# Dictionary of Cancer Terms

  1-(2’-deoxy-2’-fluoro-β-D-arabinofuranosyl) uracil: (1-(2'-dee-OK-see-2'-FLOOR-oh-BAY-tuh-D-uh-RA-bih-noh-fyoor-A-noh-sil) YOOR-uh-sil)
    Pronunciation of dictionary term "1-(2’-deoxy-2’-fluoro-β-D-arabinofuranosyl) uracil"
    A substance being studied in the treatment of advanced solid tumors and lymphomas. It blocks the growth of cells and may cause cancer cells to die. It is a type of uracil analog. Also called FAU.
  1-methyl-d-tryptophan: (1-MEH-thul-d-TRIP-toh-fan)
    Pronunciation of dictionary term "1-methyl-d-tryptophan"
    A substance being studied in the treatment of melanoma and many other types of cancer. 1-methyl-d-tryptophan blocks the breakdown of the amino acid tryptophan, which is needed for T cells (a type of immune system cell) to kill tumor cells. Giving 1-methyl-d-tryptophan to patients who have received chemotherapy for cancer may help kill more tumor cells. It is a type of enzyme inhibitor and immunosuppressant. Also called D-1MT.
  10-propargyl-10-deazaaminopterin: (10-proh-PAR-jil-10-dee-AY-zuh-a-mih-NOP-teh-rin)
    Pronunciation of dictionary term "10-propargyl-10-deazaaminopterin"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called folate analogs.
  111In-ibritumomab tiuxetan: (... ih-brih-TOO-moh-mab ty-UK-seh-tan)
    Pronunciation of dictionary term "111In-ibritumomab tiuxetan"
    A radiolabeled monoclonal antibody used to find certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the diagnosis of other types of B-cell tumors. 111In-ibritumomab tiuxetan is made up of the monoclonal antibody ibritumomab plus the radioisotope indium In 111. It binds to a protein called CD20, which is found on B cells. A machine is used to find which cells in the body have taken up 111In-ibritumomab tiuxetan. 111In-ibritumomab tiuxetan is a type of radioimmunoconjugate. Also called 111In-Zevalin and indium In 111-ibritumomab tiuxetan.
  111In-Zevalin: (... ZEH-vuh-lin)
    Pronunciation of dictionary term "111In-Zevalin"
    A radiolabeled monoclonal antibody used to find certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the diagnosis of other types of B-cell tumors. 111In-Zevalin is made up of the monoclonal antibody ibritumomab plus the radioisotope indium In 111. It binds to a protein called CD20, which is found on B cells. A machine is used to find which cells in the body have taken up 111In-Zevalin. 111In-Zevalin is a type of radioimmunoconjugate. Also called 111In-ibritumomab tiuxetan and indium In 111-ibritumomab tiuxetan.
  11C topotecan: (... toh-poh-TEE-kan)
    Pronunciation of dictionary term "11C topotecan"
    A substance being studied in the treatment of certain types of cancer, including ovarian cancer and lung cancer. 11C topotecan is a radioactive form of the anticancer drug topotecan. It builds up in tumor tissues and is detected by positron emission tomography (PET). It may be used to help determine whether treatment with topotecan will work. It is a type of topoisomerase I inhibitor.
  11C-acetate: (… A-seh-tayt)
    Pronunciation of dictionary term "11C-acetate"
    A radioactive substance being studied in positron emission tomography (PET) imaging. 11C-acetate gets taken up by cells in the body, and a PET scanner is used to find which cells in the body have taken it up. Since more 11C-acetate is taken up by cancer cells than by normal cells, it can be used to help find cancer in the body and diagnose disease. Also called carbon C 11-acetate.
  11C-choline: (… KOH-leen)
    Pronunciation of dictionary term "11C-choline"
    A radioactive substance being studied in positron emission tomography (PET) imaging to find certain types of cancer. 11C-choline gets taken up by cells in the body and more of it is taken up by cancer cells than by normal cells. A PET scanner is used to find which cells in the body have taken up 11C-choline. Also called carbon C 11-choline.
  11C-choline PET-CT scan: (… KOH-leen … skan)
    Pronunciation of dictionary term "11C-choline PET-CT scan"
    A procedure in which a small amount of 11C-choline (a radioactive form of the vitamin choline) is injected into a vein. A scanner and a computer are used to make detailed pictures of areas inside the body where the 11C-choline collects. Cancer cells take up more 11C-choline than normal cells, so the pictures can be used to find cancer cells in the body. Also called carbon C 11-choline PET-CT scan.
  12-O-tetradecanoylphorbol-13-acetate: (12-O-TEH-truh-DEH-kuh-noyl-FOR-bol-13-A-seh-tayt)
    Pronunciation of dictionary term "12-O-tetradecanoylphorbol-13-acetate"
    A substance being studied in the treatment of leukemias and lymphomas. It is also being studied in the treatment of other types of cancer. 12-O-tetradecanoylphorbol-13-acetate affects many cell actions and may cause tumor cells to die. It is a type of phorbol ester. Also called tetradecanoylphorbol acetate.
  123I-MIBG: A drug containing a form of radioactive iodine called I 123 that is used to find certain types of tumors, including pheochromocytomas and neuroblastomas. Radiation from I 123 may help show where cancer cells are in the body. 123I-MIBG is a type of radioconjugate. Also called AdreView, iobenguane I 123, and iodine I 123-metaiodobenzylguanidine.
  126–F: A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in 126–F have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give 126–F as a treatment for any disease. Also called Cancell, Cantron, Jim’s Juice, JS–101, JS–114, Protocel, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  13-cis retinoic acid: (... REH-tih-NOH-ik A-sid)
    Pronunciation of dictionary term "13-cis retinoic acid"
    A drug closely related to vitamin A that is used to treat severe acne and may also be used to treat other skin conditions and some types of cancer, including neuroblastoma. It is also being studied in the prevention and treatment of other types of cancer. 13-cis retinoic acid binds to and activates certain protein receptors in cells, including cancer cells. This may slow the growth of cancer cells and change how these cells look and act. 13-cis retinoic acid is a type of retinoid. Also called isotretinoin.
  131I-MIBG: A drug that contains a form of radioactive iodine and is used to treat adults and children aged 12 years and older with certain types of malignant pheochromocytoma or paraganglioma that have spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. 131I-MIBG builds up in tumor cells and gives off radiation that may kill them. It is a type of radiotherapeutic agent. Also called Azedra, iobenguane I 131, and iodine I 131-metaiodobenzylguanidine.
    More Information
    - Iobenguane I 131 (https://www.cancer.gov/about-cancer/treatment/drugs/iobenguaneI131)
  1572 form: (… form)
    Pronunciation of dictionary term "1572 form"
    A form that must be filed by an investigator running a clinical trial to study a new drug or agent. The investigator agrees to follow the U.S. Food and Drug Administration (FDA) Code of Federal Regulations for the clinical trial. The investigator verifies that he or she has the experience and background needed to conduct the trial and that it will be done in a way that is ethical and scientifically sound. Also called Form FDA 1572-Statement of Investigator.
  17-AAG: A substance being studied in the treatment of cancer. It is made from an antibiotic called geldanamycin. 17-AAG helps cause the breakdown of certain proteins in the cell, and may kill cancer cells. It is a type of antineoplastic antibiotic and a type of HSP90 inhibitor. Also called 17-N-allylamino-17-demethoxygeldanamycin and tanespimycin.
  17-dimethylaminoethylamino-17-demethoxygeldanamycin: (17-dy-MEH-thul-uh-MEE-noh-EH-thul-uh-MEE-noh-17-dee-meh-THOK-see-gel-DA-nuh-MY-sin)
    Pronunciation of dictionary term "17-dimethylaminoethylamino-17-demethoxygeldanamycin"
    17-DMAG. A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called geldanamycin analogs.
  17-N-allylamino-17-demethoxygeldanamycin: (17-N-A-lul-uh-MEE-noh-17-DEE-meh-THOK-see-gel-DA-nuh-MY-sin)
    Pronunciation of dictionary term "17-N-allylamino-17-demethoxygeldanamycin"
    A substance being studied in the treatment of cancer. It is made from an antibiotic called geldanamycin. 17-N-allylamino-17-demethoxygeldanamycin helps cause the breakdown of certain proteins in the cell, and may kill cancer cells. It is a type of antineoplastic antibiotic and a type of HSP90 inhibitor. Also called 17-AAG and tanespimycin.
  17p deletion: (… deh-LEE-shun)
    Pronunciation of dictionary term "17p deletion"
    The loss of all or part of the short arm (also called the p arm) of chromosome 17. The 17p deletion leads to the loss of the tumor suppressor gene TP53, which is linked to many genetic conditions and some types of cancer, such as leukemia, multiple myeloma, and myelodysplastic syndrome. Checking for the 17p deletion may help diagnose cancer, plan treatment, or make a prognosis. Also called chromosome 17p deletion and deletion 17p.
  18F-16 alpha-fluoroestradiol: (… AL-fuh-FLOOR-oh-es-truh-DY-ol)
    Pronunciation of dictionary term "18F-16 alpha-fluoroestradiol"
    A radiolabeled substance being studied as an imaging agent in breast cancer. 18F-16 alpha-fluoroestradiol binds to estrogen receptors and gives off radiation that can be detected by a positron emission tomography (PET) scan. The PET scan forms an image that shows where cancer cells with estrogen receptors can be found in the body. Also called 18F-FES and fluorine F 18-16 alpha-fluoroestradiol.
  18F-choline: (... KOH-leen)
    Pronunciation of dictionary term "18F-choline"
    A radioactive substance being studied in positron emission tomography (PET) imaging to find certain types of cancer. 18F-choline gets taken up by cells in the body and more of it is taken up by cancer cells than by normal cells. A PET scanner is used to find which cells in the body have taken up 18F-choline. Also called 18F-fluoromethylcholine, 18F-FMCH, and fluorine F 18-fluoromethylcholine.
  18F-EF5: A radioactive substance being studied in positron emission tomography (PET) imaging to find cancer cells that have a low level of oxygen. This may help predict how well the cancer will respond to treatment. Also called fluorine F 18-EF5.
  18F-FES: A radiolabeled substance being studied as an imaging agent in breast cancer. 18F-FES binds to estrogen receptors and gives off radiation that can be detected by a positron emission tomography (PET) scan. The PET scan forms an image that shows where cancer cells with estrogen receptors can be found in the body. Also called 18F-16 alpha-fluoroestradiol and fluorine F 18-16 alpha-fluoroestradiol.
  18F-FLT: A radioactive substance being studied in the diagnosis of cancer. 18F-FLT is injected into the blood and builds up in cells that are dividing, including cancer cells. The radiation that it gives off as it decays (breaks down) helps make clear pictures of tumors during a positron emission tomography (PET) scan. Also called 18F-fluorothymidine, 3’-deoxy-3’-(18F) fluorothymidine, and fluorine F 18-fluorothymidine.
  18F-fludeoxyglucose: (... FLOO-dee-OK-see-GLOO-kose)
    Pronunciation of dictionary term "18F-fludeoxyglucose"
    A radioactive form of glucose used in positron emission tomography (PET) imaging. 18F-fludeoxyglucose gets taken up by cells in the body, and a PET scanner is used to find which cells in the body have taken it up. Since more 18F-fludeoxyglucose is taken up by abnormal cells, including cancer cells, than by normal cells, it can be used to find cancer cells in the body and to diagnose cancer and other conditions. Also called fluorine F 18-fludeoxyglucose.
  18F-fluoromethylcholine: (… FLOOR-oh-MEH-thul-KOH-leen)
    Pronunciation of dictionary term "18F-fluoromethylcholine"
    A radioactive substance being studied in positron emission tomography (PET) imaging to find certain types of cancer. 18F-fluoromethylcholine gets taken up by cells in the body and more of it is taken up by cancer cells than by normal cells. A PET scanner is used to find which cells in the body have taken up 18F-fluoromethylcholine. Also called 18F-choline, 18F-FMCH, and fluorine F 18-fluoromethylcholine.
  18F-fluoromisonidazole: (… FLOOR-oh-MY-soh-NIH-duh-zole)
    Pronunciation of dictionary term "18F-fluoromisonidazole"
    A radioactive substance being studied as an imaging agent in head and neck cancer and other types of cancer. It binds to large molecules in cancer cells that have a low level of oxygen. Radiation given off by 18F-fluoromisonidazole is detected by a positron emission tomography (PET) scan. Knowing the amount of 18F-fluoromisonidazole in the cancer cells may help plan the best treatment and help predict whether the cancer will come back after treatment. Also called 18F-MISO, fluorine F 18-fluoromisonidazole, and FMISO.
  18F-fluorothymidine: (... FLOOR-oh-THY-mih-deen)
    Pronunciation of dictionary term "18F-fluorothymidine"
    A radioactive substance being studied in the diagnosis of cancer. 18F-fluorothymidine is injected into the blood and builds up in cells that are dividing, including cancer cells. The radiation that it gives off as it decays (breaks down) helps make clear pictures of tumors during a positron emission tomography (PET) scan. Also called 18F-FLT, 3’-deoxy-3’-(18F) fluorothymidine, and fluorine F 18-fluorothymidine.
  18F-FMCH: A radioactive substance being studied in positron emission tomography (PET) imaging to find certain types of cancer. 18F-FMCH gets taken up by cells in the body and more of it is taken up by cancer cells than by normal cells. A PET scanner is used to find which cells in the body have taken up 18F-FMCH. Also called 18F-choline, 18F-fluoromethylcholine, and fluorine F 18-fluoromethylcholine.
  18F-MISO: A radioactive substance being studied as an imaging agent in head and neck cancer and other types of cancer. It binds to large molecules in cancer cells that have a low level of oxygen. Radiation given off by 18F-MISO is detected by a positron emission tomography (PET) scan. Knowing the amount of 18F-MISO in the cancer cells may help plan the best treatment and help predict whether the cancer will come back after treatment. Also called 18F-fluoromisonidazole, fluorine F 18-fluoromisonidazole, and FMISO.
  18F-NaF PET: A procedure used to find out if cancer has spread to the bone. A small amount of a radioactive substance called 18F-NaF is injected into a vein. A PET scan is then used to make detailed pictures of the bones. Bones with cancer in them take up more 18F-NaF than normal bones do. Also called 18F-sodium fluoride positron emission tomography and fluorine F 18-sodium fluoride PET.
  18F-sodium fluoride positron emission tomography: (… SOH-dee-um FLOOR-ide PAH-zih-tron ee-MIH-shun toh-MAH-gruh-fee)
    Pronunciation of dictionary term "18F-sodium fluoride positron emission tomography"
    A procedure used to find out if cancer has spread to the bone. A small amount of a radioactive substance called 18F-sodium fluoride is injected into a vein. A PET scan is then used to make detailed pictures of the bones. Bones with cancer in them take up more 18F-sodium fluoride than normal bones do. Also called 18F-NaF PET and fluorine F 18-sodium fluoride PET.
  1H-nuclear magnetic resonance spectroscopic imaging: (... NOO-klee-er mag-NEH-tik REH-zuh-nunts SPEK-troh-SKAH-pik IH-muh-jing)
    Pronunciation of dictionary term "1H-nuclear magnetic resonance spectroscopic imaging"
    A noninvasive imaging method that provides information about cellular activity (metabolic information). It is used along with magnetic resonance imaging (MRI) which provides information about the shape and size of the tumor (spatial information). Also called magnetic resonance spectroscopic imaging, MRSI, and proton magnetic resonance spectroscopic imaging.
  2-D mammography: (… ma-MAH-gruh-fee)
    Pronunciation of dictionary term "2-D mammography"
    A procedure that uses x-rays to take pictures of the inside of the breast. The pictures are usually taken from two different angles, and a computer or x-ray film is used to make 2-D pictures of the breast. 2-D mammography is used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). Also called 2-dimensional mammography.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  2-dimensional mammography: (2-dih-MEN-shuh-nul ma-MAH-gruh-fee)
    Pronunciation of dictionary term "2-dimensional mammography"
    A procedure that uses x-rays to take pictures of the inside of the breast. The pictures are usually taken from two different angles, and a computer or x-ray film is used to make 2-D pictures of the breast. 2-dimensional mammography is used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). Also called 2-D mammography.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  2-methoxyestradiol: (2-meh-THOK-see-es-truh-DY-ol)
    Pronunciation of dictionary term "2-methoxyestradiol"
    2ME2. A drug that prevents the formation of new blood vessels that tumors need in order to grow. It is derived from estrogen and belongs to the family of drugs called angiogenesis inhibitors.
  21-gene signature: (… jeen SIG-nuh-cher)
    Pronunciation of dictionary term "21-gene signature"
    A lab test that is used to help predict whether breast cancer will come back or spread to other parts of the body. The test looks at the activity level of 21 different genes in breast cancer tissue of people with early-stage (stage I, II, or IIIA) invasive breast cancer that is estrogen receptor (ER) positive, HER2 negative, and is either node-negative or has spread to 1 to 3 lymph nodes. If the test shows that there is a high risk that the cancer will spread or come back, treatment with chemotherapy may be needed to lower the risk. Also called Oncotype DX breast cancer assay.
  2IT-BAD monoclonal antibody 170: (… MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "2IT-BAD monoclonal antibody 170"
    A substance being studied in the treatment of cancer. It is made by linking a monoclonal antibody called 170, which binds to a protein called MUC-1, to a substance called 2IT-BAD, which binds radioactive substances. 2IT-BAD monoclonal antibody 170 may be used to detect cancer cells and kill them. It is a type of immunoconjugate.
  3 Tesla magnetic resonance imaging: (3 TES-luh mag-NEH-tik REH-zuh-nunts IH-muh-jing)
    Pronunciation of dictionary term "3 Tesla magnetic resonance imaging"
    A procedure in which radio waves and a powerful magnet linked to a computer are used to make detailed pictures of areas inside the body. These pictures can show the difference between normal and abnormal tissue. 3 Tesla magnetic resonance imaging has a stronger magnet and makes better images of organs and soft tissue than other types of MRI do. It is used to make images of the brain, the spine, the soft tissue of joints, and the inside of bones and blood vessels. Also called 3 Tesla MRI and 3T MRI.
  3 Tesla MRI: (3 TES-luh …)
    Pronunciation of dictionary term "3 Tesla MRI"
    A procedure in which radio waves and a powerful magnet linked to a computer are used to make detailed pictures of areas inside the body. These pictures can show the difference between normal and abnormal tissue. 3 Tesla MRI has a stronger magnet and makes better images of organs and soft tissue than other types of MRI do. It is used to make images of the brain, the spine, the soft tissue of joints, and the inside of bones and blood vessels. Also called 3 Tesla magnetic resonance imaging and 3T MRI.
  3,4-benzpyrene: (... benz-PY-reen)
    Pronunciation of dictionary term "3,4-benzpyrene"
    A chemical that comes from certain substances when they are not burned completely. It is found in car exhaust, smoke from wood fires, tobacco, oil and gas products, charred or grilled foods, and other sources. It may also be found in water and soil. 3,4-Benzpyrene can cause a skin rash, a burning feeling, skin color changes, warts, and bronchitis. It may also cause cancer. It is a type of polycyclic aromatic hydrocarbon. Also called benzo(a)pyrene.
  3-aminopyridine-2-carboxaldehyde thiosemicarbazone: (3-uh-MEE-noh-PEER-ih-deen-2-KAR-bok-SAL-deh-hide THY-oh-SEH-mee KAR-buh-ZONE)
    Pronunciation of dictionary term "3-aminopyridine-2-carboxaldehyde thiosemicarbazone"
    A substance being studied in the treatment of cancer. It is a type of ribonucleotide reductase inhibitor. Also called 3-AP and Triapine.
  3-AP: A substance being studied in the treatment of cancer. It is a type of ribonucleotide reductase inhibitor. Also called 3-aminopyridine-2-carboxaldehyde thiosemicarbazone and Triapine.
  3-D: A graphic display of depth, width, and height. Also called 3-dimensional.
  3-D mammography: (… ma-MAH-gruh-fee)
    Pronunciation of dictionary term "3-D mammography"
    A procedure that uses x-rays to take a series of pictures of the inside of the breast from many different angles. A computer is used to make 3-D pictures of the breast from these x-rays. 3-D mammography is used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). It may allow doctors to see breast tissue, including dense breast tissue, more clearly than with 2-D mammography. This may make breast tumors or other changes in the breast easier to find. Also called 3-dimensional mammography and digital breast tomosynthesis.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
    - Breast Cancer Screening
  3-dimensional: (3-dih-MEN-shuh-nul)
    Pronunciation of dictionary term "3-dimensional"
    A graphic display of depth, width, and height. Also called 3-D.
  3-dimensional conformal radiation therapy: (3-dih-MEN-shuh-nul kun-FOR-mul RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "3-dimensional conformal radiation therapy"
    A procedure that uses a computer to create a 3-dimensional picture of the tumor. This allows doctors to give the highest possible dose of radiation to the tumor, while sparing the normal tissue as much as possible. Also called 3-dimensional radiation therapy and 3D-CRT.
  3-dimensional mammography: (3-dih-MEN-shuh-nul ma-MAH-gruh-fee)
    Pronunciation of dictionary term "3-dimensional mammography"
    A procedure that uses x-rays to take a series of pictures of the inside of the breast from many different angles. A computer is used to make 3-D pictures of the breast from these x-rays. 3-dimensional mammography is used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). It may allow doctors to see breast tissue, including dense breast tissue, more clearly than with 2-D mammography. This may make breast tumors or other changes in the breast easier to find. Also called 3-D mammography and digital breast tomosynthesis.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
    - Breast Cancer Screening
  3-dimensional radiation therapy: (3-dih-MEN-shuh-nul RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "3-dimensional radiation therapy"
    A procedure that uses a computer to create a 3-dimensional picture of the tumor. This allows doctors to give the highest possible dose of radiation to the tumor, while sparing the normal tissue as much as possible. Also called 3-dimensional conformal radiation therapy and 3D-CRT.
  3D-CRT: A procedure that uses a computer to create a 3-dimensional picture of the tumor. This allows doctors to give the highest possible dose of radiation to the tumor, while sparing the normal tissue as much as possible. Also called 3-dimensional conformal radiation therapy and 3-dimensional radiation therapy.
  3F8: A type of monoclonal antibody used in cancer detection or therapy. Monoclonal antibodies are laboratory-produced substances that can locate and bind to cancer cells.
  3T MRI: A procedure in which radio waves and a powerful magnet linked to a computer are used to make detailed pictures of areas inside the body. These pictures can show the difference between normal and abnormal tissue. 3T MRI has a stronger magnet and makes better images of organs and soft tissue than other types of MRI do. It is used to make images of the brain, the spine, the soft tissue of joints, and the inside of bones and blood vessels. Also called 3 Tesla magnetic resonance imaging and 3 Tesla MRI.
  3’-deoxy-3’-(18F) fluorothymidine: (… dee-OK-see … FLOOR-oh-THY-mih-deen)
    Pronunciation of dictionary term "3’-deoxy-3’-(18F) fluorothymidine"
    A radioactive substance being studied in the diagnosis of cancer. 3’-deoxy-3’-(18F) fluorothymidine is injected into the blood and builds up in cells that are dividing, including cancer cells. The radiation that it gives off as it decays (breaks down) helps make clear pictures of tumors during a positron emission tomography (PET) scan. Also called 18F-FLT, 18F-fluorothymidine, and fluorine F 18-fluorothymidine.
  4-demethoxydaunorubicin: (4-DEE-meh-THOK-see-DAW-noh-ROO-bih-sin)
    Pronunciation of dictionary term "4-demethoxydaunorubicin"
    A drug used with other drugs to treat adults with acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. 4-demethoxydaunorubicin blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called Idamycin PFS and idarubicin hydrochloride.
    More Information
    - Idarubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/idarubicinhydrochloride)
  4-hydroxytamoxifen: (4-hy-DROK-see-tuh-MOK-sih-FEN)
    Pronunciation of dictionary term "4-hydroxytamoxifen"
    A form of the drug tamoxifen that is made by the body after taking tamoxifen. It can also be made in the laboratory, and may help decrease breast density. A topical form of 4-hydroxytamoxifen is being studied in breast cancer screening.
  4-nitroquinoline 1-oxide: (4-NY-troh-KWIH-noh-leen 1-OK-side)
    Pronunciation of dictionary term "4-nitroquinoline 1-oxide"
    A substance that is used in cancer research to cause tumors in laboratory animals. This is done to test new diets, drugs, and procedures for use in cancer prevention and treatment. Also called 4-NQO.
  4-NQO: A substance that is used in cancer research to cause tumors in laboratory animals. This is done to test new diets, drugs, and procedures for use in cancer prevention and treatment. Also called 4-nitroquinoline 1-oxide.
  45 CFR 46: Laws set by the U.S. Department of Health and Human Services (DHHS) to protect a person from risks in research studies that any federal agency or department has a part in. Also called 45 Code of Federal Regulations Part 46, human participant protection regulations, and Protection of Human Subjects.
  45 Code of Federal Regulations Part 46: (... FEH-drul REH-gyoo-LAY-shunz ...)
    Pronunciation of dictionary term "45 Code of Federal Regulations Part 46"
    Laws set by the U.S. Department of Health and Human Services (DHHS) to protect a person from risks in research studies that any federal agency or department has a part in. Also called 45 CFR 46, human participant protection regulations, and Protection of Human Subjects.
  5-alpha reductase inhibitor: (5-AL-fuh ree-DUK-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "5-alpha reductase inhibitor"
    A substance that blocks an enzyme needed by the body to make dihydrotestosterone (a male sex hormone made from testosterone). Dihydrotestosterone can cause the prostate to grow. 5-alpha reductase inhibitors are used to shrink an enlarged prostate gland and to improve the flow of urine in a condition called benign prostatic hyperplasia (BPH). A 5-alpha reductase inhibitor is a type of enzyme inhibitor.
  5-fluoro-2-deoxycytidine: (5-FLOOR-oh-2-dee-OK-see-SY-tih-deen)
    Pronunciation of dictionary term "5-fluoro-2-deoxycytidine"
    A substance being studied in the treatment of some types of cancer. It may prevent the growth of tumors by stopping cancer cells from dividing and by killing them. It is a type of antimetabolite. Also called FdCyd.
  5-fluorouracil: (5-FLOOR-oh-YOOR-uh-sil)
    Pronunciation of dictionary term "5-fluorouracil"
    A drug given as an injection to treat cancers of the breast, colon, rectum, stomach, and pancreas and as a cream to treat actinic keratosis (a skin condition that may become cancer) and certain types of basal cell skin cancer. It is used under the brand names Carac, Tolak, Efudex, and Fluoroplex to treat actinic keratosis. It is also used under the brand name Efudex to treat basal cell skin cancer. 5-fluorouracil is also being studied in the treatment of other conditions and types of cancer. It stops cells from making DNA and may kill cancer cells. 5-fluorouracil is a type of antimetabolite. Also called 5-FU and fluorouracil.
    More Information
    - Fluorouracil Injection (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil)
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  5-FU: A drug given as an injection to treat cancers of the breast, colon, rectum, stomach, and pancreas and as a cream to treat actinic keratosis (a skin condition that may become cancer) and certain types of basal cell skin cancer. It is used under the brand names Carac, Tolak, Efudex, and Fluoroplex to treat actinic keratosis. It is also used under the brand name Efudex to treat basal cell skin cancer. 5-FU is also being studied in the treatment of other conditions and types of cancer. It stops cells from making DNA and may kill cancer cells. 5-FU is a type of antimetabolite. Also called 5-fluorouracil and fluorouracil.
    More Information
    - Fluorouracil Injection (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil)
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  5-FU-leucovorin calcium: (… LOO-koh-VOR-in KAL-see-um)
    Pronunciation of dictionary term "5-FU-leucovorin calcium"
    A chemotherapy combination used to treat colorectal cancer. It is also used with radiation therapy to treat esophageal cancer and stomach cancer. It includes the drugs fluorouracil and leucovorin calcium. Also called 5-FU-leucovorin calcium regimen.
    More Information
    - FU-LV (https://www.cancer.gov/about-cancer/treatment/drugs/FU-LV)
  5-FU-leucovorin calcium regimen: (… LOO-koh-VOR-in KAL-see-um REH-jih-men)
    Pronunciation of dictionary term "5-FU-leucovorin calcium regimen"
    A chemotherapy combination used to treat colorectal cancer. It is also used with radiation therapy to treat esophageal cancer and stomach cancer. It includes the drugs fluorouracil and leucovorin calcium. Also called 5-FU-leucovorin calcium.
    More Information
    - FU-LV (https://www.cancer.gov/about-cancer/treatment/drugs/FU-LV)
  5-FU/LV: An abbreviation for a chemotherapy combination used to treat colorectal cancer. It is also used with radiation therapy to treat esophageal cancer and stomach cancer. It includes the drugs fluorouracil and leucovorin calcium. Also called FU-LV and FU-LV regimen.
    More Information
    - FU-LV (https://www.cancer.gov/about-cancer/treatment/drugs/FU-LV)
  5-HIAA: A substance formed by the breakdown of a hormone called serotonin in the liver. Nerves use serotonin to send messages to one another. After 5-HIAA is broken down from serotonin in the liver, the kidneys filter it from the blood and pass it into the urine. Serotonin and 5-HIAA may be found in higher-than-normal amounts in patients with certain tumors, such as carcinoid tumor. Measuring the amount of 5-HIAA in the urine may help diagnose and monitor carcinoid tumors and other conditions. 5-HIAA is a type of tumor marker. Also called 5-hydroxyindoleacetic acid.
    More Information
    - Tumor Marker Tests in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  5-HT3 receptor antagonist: (… reh-SEP-ter an-TA-guh-nist)
    Pronunciation of dictionary term "5-HT3 receptor antagonist"
    A type of drug used to treat certain types of irritable bowel syndrome and relieve nausea and vomiting. It is a type of antiemetic. Also called 5-hydroxytryptamine 3 receptor antagonist and type 3 serotonin receptor antagonist.
  5-hydroxyindoleacetic acid: (5-hy-DROK-see-IN-dole-uh-SEE-tik A-sid)
    Pronunciation of dictionary term "5-hydroxyindoleacetic acid"
    A substance formed by the breakdown of a hormone called serotonin in the liver. Nerves use serotonin to send messages to one another. After 5-hydroxyindoleacetic acid is broken down from serotonin in the liver, the kidneys filter it from the blood and pass it into the urine. Serotonin and 5-hydroxyindoleacetic acid may be found in higher-than-normal amounts in patients with certain tumors, such as carcinoid tumor. Measuring the amount of 5-hydroxyindoleacetic acid in the urine may help diagnose and monitor carcinoid tumors and other conditions. 5-hydroxyindoleacetic acid is a type of tumor marker. Also called 5-HIAA.
    More Information
    - Tumor Marker Tests in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  5-hydroxytryptamine: (5-hy-DROK-see-TRIP-tuh-meen)
    Pronunciation of dictionary term "5-hydroxytryptamine"
    A substance that is found mostly in the digestive tract, central nervous system (brain and spinal cord), and platelets. 5-hydroxytryptamine acts both as a neurotransmitter (a substance that nerves use to send messages to one another) and a vasoconstrictor (a substance that causes blood vessels to narrow). A low level of 5-hydroxytryptamine in the brain is thought to be a cause of depression. Also called serotonin.
  5-hydroxytryptamine 3 receptor antagonist: (5-hy-DROK-see-TRIP-tuh-meen 3 reh-SEP-ter an-TA-guh-nist)
    Pronunciation of dictionary term "5-hydroxytryptamine 3 receptor antagonist"
    A type of drug used to treat certain types of irritable bowel syndrome and relieve nausea and vomiting. It is a type of antiemetic. Also called 5-HT3 receptor antagonist and type 3 serotonin receptor antagonist.
  504 plan: (… plan)
    Pronunciation of dictionary term "504 plan"
    An education plan for students with disabilities or certain health conditions, such as cancer. By law, these students must have the same access to school programs and activities as students without disabilities. A 504 plan may include extra help in the classroom, such as allowing the student more time to take a test or finish an assignment, or to use a computer or tape recorder. It may also include tutoring and other services, such as speech therapy and physical therapy. It is covered under the U.S. law, Rehabilitation Act of 1973.
  506U78: A drug used to treat adults and children aged 1 year and older with T-cell acute lymphoblastic leukemia and T-cell lymphoblastic lymphoma. It is used in patients whose cancer has not gotten better or has recurred (come back) after treatment with other anticancer drugs. 506U78 stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called Arranon and nelarabine.
    More Information
    - Nelarabine (https://www.cancer.gov/about-cancer/treatment/drugs/nelarabine)
  5q minus syndrome: (... MY-nus SIN-drome)
    Pronunciation of dictionary term "5q minus syndrome"
    A rare disorder caused by loss of part of the long arm (q arm) of human chromosome 5. This syndrome affects myeloid (bone marrow) cells, causing treatment-resistant anemia and myelodysplastic syndromes that may lead to acute myelogenous leukemia. Also called 5q- syndrome.
    More Information
    - 5q- syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8723/5q-syndrome)
    - 5q minus syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/5q-minus-syndrome/)
  5q- syndrome: (... SIN-drome)
    Pronunciation of dictionary term "5q- syndrome"
    A rare disorder caused by loss of part of the long arm (q arm) of human chromosome 5. This syndrome affects myeloid (bone marrow) cells, causing treatment-resistant anemia and myelodysplastic syndromes that may lead to acute myelogenous leukemia. Also called 5q minus syndrome.
    More Information
    - 5q- syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8723/5q-syndrome)
    - 5q minus syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/5q-minus-syndrome/)
  6-hydroxymethylacylfulvene: (6-hy-DROK-see-MEH-thul-AY-sel-FUL-veen)
    Pronunciation of dictionary term "6-hydroxymethylacylfulvene"
    A substance being studied in the treatment of some types of cancer. 6-hydroxymethylacylfulvene attaches to the cell's DNA and may block cancer cell growth. It is a type of alkylating agent. Also called irofulven.
  70-gene signature: (… jeen SIG-nuh-cher)
    Pronunciation of dictionary term "70-gene signature"
    A lab test that is used to help predict whether breast cancer will come back or spread to other parts of the body. The test looks at the activity level of 70 different genes in breast cancer tissue of people with early-stage (stage I, II, or IIIA) invasive breast cancer that is less than 5 cm and is either node-negative or has spread to 1 to 3 lymph nodes. If the test shows that there is a high risk that the cancer will spread or come back, treatment with chemotherapy may be needed to lower the risk. Also called MammaPrint.
  852A: A substance being studied in the treatment of certain adult and childhood blood cancers and other types of cancer. 852A may help the patient's immune system block tumor growth. It is a type of immune system modulator.
  9-cis retinoic acid: (... REH-tih-NOH-ik A-sid)
    Pronunciation of dictionary term "9-cis retinoic acid"
    A substance being studied in the prevention of cancer. It is a type of retinoid.
  90Y-DOTA-biotin: (… BY-oh-tin)
    Pronunciation of dictionary term "90Y-DOTA-biotin"
    A compound that contains the radioisotope yttrium Y 90 linked to the chemical biotin. Biotin is a molecule that binds strongly to the chemical streptavidin. 90Y-DOTA-biotin will find tumor cells in the body that have been targeted by an antibody linked to streptavidin and kill them. It is being studied together with CC49-streptavidin in the treatment of cancer. Also called yttrium Y 90-DOTA-biotin.
  90Y-ibritumomab tiuxetan: (... ih-brih-TOO-moh-mab ty-UK-seh-tan)
    Pronunciation of dictionary term "90Y-ibritumomab tiuxetan"
    A drug used with the drug rituximab to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of B-cell tumors. 90Y-ibritumomab tiuxetan contains a monoclonal antibody that binds to a protein called CD20, which is found on B cells. It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. 90Y-ibritumomab tiuxetan is a type of radioimmunoconjugate. Also called 90Y-Zevalin, IDEC-Y2B8, and yttrium Y 90-ibritumomab tiuxetan.
  90Y-Zevalin: (... ZEH-vuh-lin)
    Pronunciation of dictionary term "90Y-Zevalin"
    A drug used with the drug rituximab to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of B-cell tumors. 90Y-Zevalin contains a monoclonal antibody that binds to a protein called CD20, which is found on B cells. It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. 90Y-Zevalin is a type of radioimmunoconjugate. Also called 90Y-ibritumomab tiuxetan, IDEC-Y2B8, and yttrium Y 90-ibritumomab tiuxetan.
  99m-Tc-Dx: A substance being studied as a way to find sentinel lymph nodes in some types of skin cancer and breast cancer. It contains a radioactive substance called technetium linked to a substance called dextran. Dextran helps technetium stay in blood and lymph vessels after it is injected. A machine or probe that detects radioactivity shows which lymph nodes near the tumor have 99m-Tc-Dx in them. Also called Tc-99m Dextran and technetium Tc 99m-dextran.
  9cUAB30: A substance being studied in the treatment and prevention of cancer. It blocks an enzyme that keeps cells alive by adding material to the ends of chromosomes. Blocking this enzyme may cause the cancer cells to die. 9cUAB30 is a type of retinoic acid and a type of telomerase inhibitor.
  9p21: A specific part of chromosome 9 called p21, which has a gene that may be involved in stopping tumor cell growth. In some types of cancer cells, including bladder cancer cells, this small part of chromosome 9 may be missing. This may cause cancer cell growth. Checking for 9p21 may help diagnose cancer or find out if cancer has come back. 9p21 is a type of tumor marker.
  [18F]-labeled substance P antagonist receptor quantifier: (… LAY-buld SUB-stunts P an-TA-guh-nist reh-SEP-ter KWAN-tih-FY-er)
    Pronunciation of dictionary term "[18F]-labeled substance P antagonist receptor quantifier"
    A radiolabeled substance being studied in PET imaging of the brain. It is also being studied as a way to find where cancer cells have spread in patients with pancreatic cancer. It binds to cell receptors for substance P, also known as neurokinin-1, which is found on nerve cells and on some types of cancer cells, such as pancreatic cancer cells. [18F]-labeled substance P antagonist receptor quantifier is a type of PET radioligand and a type of radiolabeled neurokinin-1 receptor antagonist.
  [18F]SPA-RQ: A radiolabeled substance being studied in PET imaging of the brain. It is also being studied as a way to find where cancer cells have spread in patients with pancreatic cancer. It binds to cell receptors for substance P.
  μL: A measure of volume for a liquid, using the metric system. One μL is equal to a millionth of a liter. Also called microliter.
  μM: The amount of a substance equal to a millionth of a mole (a measure of the amount of a substance). Also called micromole.
  A33: A type of monoclonal antibody used in cancer detection or therapy. Monoclonal antibodies are laboratory-produced substances that can locate and bind to cancer cells.
  A6: A substance being studied in the treatment of cancer. A6 is a small piece of a protein called urokinase (an enzyme that dissolves blood clots or prevents them from forming). It is a type of antiangiogenesis agent and a type of antimetastatic agent. Also called urokinase plasminogen activator (uPA)-derived peptide A6.
  AAP: An enzyme that is normally found in healthy kidneys. It may be found at high levels in the urine when there are kidney problems. It is used as a biomarker to detect damage to the kidneys caused by drugs and other agents. It may also be used to diagnose certain kidney and liver disorders. Also called alanine aminopeptidase.
  AAT deficiency: (… deh-FIH-shun-see)
    Pronunciation of dictionary term "AAT deficiency"
    An inherited condition in which the body either does not make enough of a protein called alpha-1 antitrypsin (AAT) or makes an abnormal form of AAT. AAT is made in the liver and helps protect the body’s organs, especially the liver and lungs, from damage. AAT deficiency can lead to serious lung conditions (including emphysema and bronchiectasis) and liver conditions (including cirrhosis, hepatitis, and liver cancer). It may also cause inflammation of the blood vessels and a rare skin condition that causes painful lumps on or under the skin. Lung problems caused by AAT deficiency almost always occur in adults, but liver and skin problems may occur in both adults and children. AAT deficiency is caused by a mutation (change) in a gene called SERPINA1. Also called alpha-1 antitrypsin deficiency.
    More Information
    - Alpha-1 antitrypsin deficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5784/alpha-1-antitrypsin-deficiency)
    - Alpha-1 antitrypsin deficiency (MedlinePlus) (https://medlineplus.gov/genetics/condition/alpha-1-antitrypsin-deficiency/)
  abarelix: (uh-BAYR-eh-lix)
    Pronunciation of dictionary term "abarelix"
    A drug used to reduce the amount of testosterone made in patients with advanced symptomatic prostate cancer for which no other treatment options are available. It belongs to the family of drugs called gonadotropin-releasing hormone (GnRH) antagonists. Also called Plenaxis.
  ABCA1 pathway: (… PATH-way)
    Pronunciation of dictionary term "ABCA1 pathway"
    Describes a group of proteins in a cell that work together to help remove extra cholesterol and certain fats from tissue in the body. Changes in the ABCA1 pathway may lead to diseases of the heart and blood vessels. Drugs or substances that affect this pathway are being studied in the prevention and treatment of some diseases.
  ABCD rating: (... RAY-ting)
    Pronunciation of dictionary term "ABCD rating"
    A staging system for prostate cancer that uses ABCD. “A” and “B” refer to cancer that is confined to the prostate. “C” refers to cancer that has grown out of the prostate but has not spread to lymph nodes or other places in the body. “D” refers to cancer that has spread to lymph nodes or to other places in the body. Also called Jewett staging system and Whitmore-Jewett staging system.
  abdomen: (AB-doh-men)
    Pronunciation of dictionary term "abdomen"
    The area of the body that contains the pancreas, stomach, intestines, liver, gallbladder, and other organs.
  abdominal: (ab-DAH-mih-nul)
    Pronunciation of dictionary term "abdominal"
    Having to do with the abdomen, which is the part of the body between the chest and the hips that contains the pancreas, stomach, intestines, liver, gallbladder, and other organs.
  abdominal breathing: (ab-DAH-mih-nul BREE-thing)
    Pronunciation of dictionary term "abdominal breathing"
    A relaxation technique in which a person focuses on taking slow, deep breaths. Abdominal breathing involves breathing in slowly through the nose and then out through the mouth using the diaphragm (the thin muscle that separates the chest from the abdomen) and abdominal muscles. This helps boost the amount of oxygen in the blood, lowers blood pressure and heart rate, and reduces muscle tension. Abdominal breathing may be used to help relieve stress, pain, and anxiety. Also called deep breathing and diaphragmatic breathing.
  abdominal ultrasound: (ab-DAH-mih-nul UL-truh-sownd)
    Pronunciation of dictionary term "abdominal ultrasound"
    A procedure used to examine the organs in the abdomen. An ultrasound transducer (probe) is pressed firmly against the skin of the abdomen. High-energy sound waves from the transducer bounce off tissues and create echoes. The echoes are sent to a computer, which makes a picture called a sonogram. Also called transabdominal ultrasound.
    Abdominal ultrasound. An ultrasound transducer connected to a computer is passed over the surface of the abdomen. The ultrasound transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
    Abdominal ultrasound; drawing shows a woman on an exam table during an abdominal ultrasound procedure. A diagnostic sonographer (a person trained to perform ultrasound procedures) is shown passing a transducer (a device that makes sound waves that bounce off tissues inside the body) over the surface of the patient’s abdomen. A computer screen shows a sonogram (computer picture).
  abdominal wall: (ab-DAH-mih-nul …)
    Pronunciation of dictionary term "abdominal wall"
    The layers of skin, muscles, fat, and other tissues that surround and protect the organs inside the abdomen. The abdomen is located between the chest and the pelvis and contains the stomach, intestines, liver, pancreas, gallbladder, and other organs. The muscles in the abdominal wall are used when a person sneezes, coughs, vomits, or has a bowel movement. The abdominal wall also helps support movement of the spine.
  abdominal x-ray: (ab-DAH-mih-nul EX-ray)
    Pronunciation of dictionary term "abdominal x-ray"
    An x-ray of the organs inside the abdomen. An x-ray is a type of radiation that can pass through the body and onto film, making pictures of areas inside the body. X-rays may be used to help diagnose disease.
    X-ray of the abdomen. The patient lies on a table and x-rays are used to take pictures of the inside of the body.
    X-ray of the abdomen; drawing shows the patient on a table and x-rays are used to take pictures of the inside of the body.
  abdominoperineal resection: (ab-DAH-mih-noh-PAYR-ih-NEE-ul ree-SEK-shun)
    Pronunciation of dictionary term "abdominoperineal resection"
    Surgery to remove the anus, the rectum, and part of the sigmoid colon through an incision made in the abdomen. The end of the intestine is attached to an opening in the surface of the abdomen and body waste is collected in a disposable bag outside of the body. This opening is called a colostomy. Lymph nodes that contain cancer may also be removed during this operation.
    Resection of the colon with colostomy. Part of the colon containing the cancer and nearby healthy tissue are removed, a stoma is created, and a colostomy bag is attached to the stoma.
    Three-panel drawing showing anal cancer surgery with colostomy; first panel shows area of anus with cancer, middle panel shows cancer and nearby tissue removed and stoma created, last panel shows a colostomy bag attached to the stoma.
  Abecma: (uh-BEK-muh)
    Pronunciation of dictionary term "Abecma"
    A treatment used for adults with multiple myeloma that came back or did not get better after treatment with at least two lines of anticancer therapy that included an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Abecma is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Abecma binds to a protein called BCMA, which is found on myeloma cells and some types of immune cells. This helps the body’s immune system kill cancer cells. Abecma is a type of cellular immunotherapy called CAR T-cell therapy. Also called idecabtagene vicleucel.
    More Information
    - Idecabtagene Vicleucel (https://www.cancer.gov/about-cancer/treatment/drugs/Idecabtagenevicleucel)
  Abegrin: (A-beh-grin)
    Pronunciation of dictionary term "Abegrin"
    A substance being studied in the treatment of some types of cancer and other conditions. Abegrin binds to a protein on the surface of blood vessels and may prevent the growth of new blood vessels that tumors need to grow. It may also prevent the spread of cancer. It is a type of antiangiogenesis agent, a type of metastasis inhibitor, and a type of monoclonal antibody. Also called etaracizumab, humanized monoclonal antibody MEDI-522, and MEDI-522.
  abemaciclib: (uh-BEH-muh-SY-klib)
    Pronunciation of dictionary term "abemaciclib"
    A drug used alone or with other drugs to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer. It is also being studied in the treatment of other types of cancer. Abemaciclib blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Also called Verzenio.
    More Information
    - Abemaciclib (https://www.cancer.gov/about-cancer/treatment/drugs/abemaciclib)
  aberrant crypt foci: (uh-BAYR-unt kript FOH-sy)
    Pronunciation of dictionary term "aberrant crypt foci"
    Clusters of abnormal tube-like glands in the lining of the colon and rectum. Aberrant crypt foci form before colorectal polyps and are one of the earliest changes that can be seen in the colon that may lead to cancer. Also called ACF.
  ABI-007: A form of the anticancer drug paclitaxel that is used alone or with other drugs to treat certain types of breast cancer, non-small cell lung cancer, and pancreatic cancer. ABI-007 may have fewer side effects and work better than other forms of paclitaxel. It is also being studied in the treatment of other types of cancer. ABI-007 stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called Abraxane, nanoparticle paclitaxel, paclitaxel albumin-stabilized nanoparticle formulation, and protein-bound paclitaxel.
    More Information
    - Paclitaxel Albumin-stabilized Nanoparticle Formulation (https://www.cancer.gov/about-cancer/treatment/drugs/nanoparticlepaclitaxel)
  abiraterone acetate: (A-bih-RA-teh-rone A-seh-tayt)
    Pronunciation of dictionary term "abiraterone acetate"
    A drug used with other drugs to treat prostate cancer that has spread to other parts of the body. Abiraterone acetate is used under the brand name Zytiga to treat patients whose cancer is castration resistant (has not responded to treatments that lower testosterone levels) or whose cancer is high risk and castration sensitive (has responded to treatments that lower testosterone levels). It is also used under the brand name Yonsa to treat patients whose cancer is castration resistant. Abiraterone acetate is also being studied in the treatment of other types of cancer. It lowers the amount of androgens (male hormones), such as testosterone, made by the body. This may stop the growth of cancer cells that need androgens to grow. Abiraterone acetate is a type of antiandrogen.
    More Information
    - Abiraterone Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/abirateroneacetate)
  ablation: (a-BLAY-shun)
    Pronunciation of dictionary term "ablation"
    In medicine, the removal or destruction of a body part or tissue or its function. Ablation may be performed by surgery, hormones, drugs, radiofrequency, heat, or other methods.
  abnormal: (ab-NOR-mul)
    Pronunciation of dictionary term "abnormal"
    Not normal. Describes a state, condition, or behavior that is unusual or different from what is considered normal. In medicine, an abnormal lesion or growth in or on the body may be benign (not cancer), precancerous or premalignant (likely to become cancer), or malignant (cancer). Also called atypical.
  ABO blood group system: (… blud groop SIS-tem)
    Pronunciation of dictionary term "ABO blood group system"
    A system used to group human blood into different types, based on the presence or absence of certain markers on the surface of red blood cells. The four main blood types are A, B, O, and AB. For a blood transfusion, the ABO blood group system is used to match the blood type of the donor and the person receiving the transfusion. People with blood type O can donate blood to anyone and are called universal donors. People with blood type AB can accept blood from all donors and are called universal recipients. People with type A or B can receive matching blood or type O blood.
  ABR test: (... test)
    Pronunciation of dictionary term "ABR test"
    A test used to detect some types of hearing loss, such as hearing loss caused by injury or tumors that affect nerves involved in hearing. Electrodes are placed on the head and certain tones or clicking sounds are made. The electrodes measure nerve signals in the brain when it reacts to the sounds. Also called auditory brain stem response test, BAER test, and brain stem auditory evoked response test.
    More Information
    - Langerhans Cell Histiocytosis Treatment
  Abraxane: (uh-BRAK-sayn)
    Pronunciation of dictionary term "Abraxane"
    A form of the anticancer drug paclitaxel that is used alone or with other drugs to treat certain types of breast cancer, non-small cell lung cancer, and pancreatic cancer. Abraxane may have fewer side effects and work better than other forms of paclitaxel. It is also being studied in the treatment of other types of cancer. Abraxane stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called ABI-007, nanoparticle paclitaxel, paclitaxel albumin-stabilized nanoparticle formulation, and protein-bound paclitaxel.
    More Information
    - Paclitaxel Albumin-stabilized Nanoparticle Formulation (https://www.cancer.gov/about-cancer/treatment/drugs/nanoparticlepaclitaxel)
  Abrikossoff tumor: (AH-bree-KAH-sof TOO-mer)
    Pronunciation of dictionary term "Abrikossoff tumor"
    A rare type of soft tissue tumor that usually begins in Schwann cells (cells that hold nerve cells in place). It can occur anywhere in the body, but it usually occurs in or under the skin of the head and neck (especially the mouth or tongue). It may also occur in the chest, breast, esophagus, stomach, or other internal organ. Most Abrikossoff tumors are benign (not cancer), but some may be malignant (cancer) and spread quickly to nearby tissue. They usually occur in middle-aged adults. Also called granular cell tumor.
  abscess: (AB-ses)
    Pronunciation of dictionary term "abscess"
    An enclosed collection of pus in tissues, organs, or confined spaces in the body. An abscess is a sign of infection and is usually swollen and inflamed.
  abscopal effect: (ab-SKOH-pul eh-FEKT)
    Pronunciation of dictionary term "abscopal effect"
    Describes the shrinking or disappearance of tumors in parts of the body that were not the direct target of local therapy, such as radiation therapy. It is thought that in the abscopal effect, the immune system is stimulated to fight cancer in the whole body as a result of the local therapy. Learning more about the abscopal effect may help in the development of new cancer treatments, especially for metastatic cancer.
  absolute neutrophil count: (AB-soh-loot NOO-troh-fil kownt)
    Pronunciation of dictionary term "absolute neutrophil count"
    A measure of the number of neutrophils in the blood. Neutrophils are a type of white blood cell. They help the body fight infection. An absolute neutrophil count may be used to check for infection, inflammation, leukemia, and other conditions. The lower a person's absolute neutrophil count is, the higher the risk is of getting an infection. Having an absolute neutrophil count of less than 500 means there is a high risk of getting an infection. Cancer treatment, such as chemotherapy, may reduce the absolute neutrophil count. Also called ANC.
  absolute risk: (AB-soh-loot risk)
    Pronunciation of dictionary term "absolute risk"
    A measure of the risk of a certain event happening. In cancer research, absolute risk is the likelihood that a person who is free of a specific type of cancer at a given age will develop that cancer over a certain period of time. For example, a woman 35 years of age, with no known risk factors for breast cancer, has an absolute risk of getting breast cancer over a lifetime of 90 years of about 13%, meaning she has a 1 in 8 chance of developing breast cancer. This also means the chance that she will never have breast cancer is about 87%, or 7 in 8.
  absorption: (ub-SORP-shun)
    Pronunciation of dictionary term "absorption"
    The process of taking nutrients from the digestive system into the blood so they can be used in the body.
  ABT-263: A substance being studied in the treatment of lymphomas and other types of cancer. It blocks some of the enzymes that keep cancer cells from dying. It is a type of Bcl-2 family inhibitor. Also called navitoclax.
  ABT-510: A substance being studied in the treatment of cancer. It is a type of angiogenesis inhibitor.
  ABT-751: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called sulfonamides.
  ABT-869: A substance being studied in the treatment of several types of cancer. ABT-869 blocks the action of several growth factors. It may also block the growth of new blood vessels that tumors need to grow and may cause cancer cells to die. It is a type of receptor tyrosine kinase inhibitor and a type of angiogensis inhibitor. Also called multitargeted receptor tyrosine kinase inhibitor ABT-869.
  ABT-888: A substance being studied in the treatment of breast cancers caused by mutations (changes) in the BRCA1 and BRCA2 genes. It is also being studied in the treatment of other types of cancer. It blocks an enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. ABT-888 may cause cancer cells to die. It is a type of poly(ADP-ribose) polymerase inhibitor. Also called PARP-1 inhibitor ABT-888 and veliparib.
  ABVD: An abbreviation for a chemotherapy combination used to treat Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vinblastine sulfate, and dacarbazine. Also called ABVD regimen.
    More Information
    - ABVD (https://www.cancer.gov/about-cancer/treatment/drugs/ABVD)
  ABVD regimen: (… REH-jih-men)
    Pronunciation of dictionary term "ABVD regimen"
    An abbreviation for a chemotherapy combination used to treat Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vinblastine sulfate, and dacarbazine. Also called ABVD.
    More Information
    - ABVD (https://www.cancer.gov/about-cancer/treatment/drugs/ABVD)
  ABVE: An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, and etoposide. Also called ABVE regimen, DBVE, and DBVE regimen.
    More Information
    - ABVE (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE)
  ABVE regimen: (… REH-jih-men)
    Pronunciation of dictionary term "ABVE regimen"
    An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, and etoposide. Also called ABVE, DBVE, and DBVE regimen.
    More Information
    - ABVE (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE)
  ABVE-PC: An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, etoposide, prednisone, and cyclophosphamide. Also called ABVE-PC regimen, DBVE-PC, and DBVE-PC regimen.
    More Information
    - ABVE-PC (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE-PC)
  ABVE-PC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "ABVE-PC regimen"
    An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, etoposide, prednisone, and cyclophosphamide. Also called ABVE-PC, DBVE-PC, and DBVE-PC regimen.
    More Information
    - ABVE-PC (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE-PC)
  ABX-EGF: A drug used alone or with other drugs to treat certain types of colorectal cancer that have spread to other parts of the body. It is used in patients whose cancer has not already been treated or has gotten worse after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. ABX-EGF binds to a protein called epidermal growth factor receptor (EGFR), which is found on some normal cells and some types of cancer cells. Blocking this protein may help keep cancer cells from growing. ABX-EGF is a type of monoclonal antibody. Also called panitumumab and Vectibix.
    More Information
    - Panitumumab (https://www.cancer.gov/about-cancer/treatment/drugs/panitumumab)
  AC: An abbreviation for a chemotherapy combination used with other types of therapy to treat breast cancer, including breast cancer that has spread or come back. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide. Also called AC regimen.
    More Information
    - AC (https://www.cancer.gov/about-cancer/treatment/drugs/AC)
  AC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "AC regimen"
    An abbreviation for a chemotherapy combination used with other types of therapy to treat breast cancer, including breast cancer that has spread or come back. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide. Also called AC.
    More Information
    - AC (https://www.cancer.gov/about-cancer/treatment/drugs/AC)
  AC-T: An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol). Also called AC-T regimen and AC-Taxol regimen.
    More Information
    - AC-T (https://www.cancer.gov/about-cancer/treatment/drugs/AC-T)
  AC-T regimen: (… REH-jih-men)
    Pronunciation of dictionary term "AC-T regimen"
    An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol). Also called AC-T and AC-Taxol regimen.
    More Information
    - AC-T (https://www.cancer.gov/about-cancer/treatment/drugs/AC-T)
  AC-T-T: An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol) and trastuzumab (Herceptin). Also called AC-T-T regimen, AC-TH regimen, and sequential AC/Taxol-Trastuzumab regimen.
  AC-T-T regimen: (… REH-jih-men)
    Pronunciation of dictionary term "AC-T-T regimen"
    An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol) and trastuzumab (Herceptin). Also called AC-T-T, AC-TH regimen, and sequential AC/Taxol-Trastuzumab regimen.
  AC-Taxol regimen: (… TAK-sol REH-jih-men)
    Pronunciation of dictionary term "AC-Taxol regimen"
    An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol). Also called AC-T and AC-T regimen.
    More Information
    - AC-T (https://www.cancer.gov/about-cancer/treatment/drugs/AC-T)
  AC-TH regimen: (… REH-jih-men)
    Pronunciation of dictionary term "AC-TH regimen"
    An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol) and trastuzumab (Herceptin). Also called AC-T-T, AC-T-T regimen, and sequential AC/Taxol-Trastuzumab regimen.
  acalabrutinib maleate monohydrate: (uh-KA-luh-BROO-tih-nib MAY-lee-AYT MAH-noh-HY-drayt)
    Pronunciation of dictionary term "acalabrutinib maleate monohydrate"
    A drug used alone to treat adults with chronic lymphocytic leukemia or small lymphocytic lymphoma and adults with mantle cell lymphoma that has already been treated with at least one other therapy. Acalabrutinib maleate monohydrate is used with bendamustine and rituximab to treat adults with mantle cell lymphoma that has not been treated and who cannot receive an autologous stem cell transplant. It is also being studied in the treatment of other types of cancer. Acalabrutinib maleate monohydrate blocks a protein called BTK, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Calquence.
    More Information
    - Acalabrutinib Maleate Monohydrate (https://www.cancer.gov/about-cancer/treatment/drugs/acalabrutinib)
  ACAPHA: (a-KA-fuh)
    Pronunciation of dictionary term "ACAPHA"
    A mixture of six herbs that has been used in China to prevent and treat diseases such as lung and esophageal cancers. It is being studied in the United States and Canada in the prevention of lung cancer in people who used to smoke.
  accelerated approval: (ak-SEH-leh-ray-ted uh-PROO-vul)
    Pronunciation of dictionary term "accelerated approval"
    An official process that allows a new drug to be approved by the U.S. Food and Drug Administration (FDA) before it has gone through all of the required levels of testing in humans. It is only used for drugs that treat serious or life-threatening diseases for which other treatments may not be available or may no longer be effective. A drug may be approved through the accelerated approval process if it has shown certain signs in clinical trials that it might be beneficial for patients, such as a shrinking tumor. Further testing of the drug is required after it has received accelerated approval and is on the market to confirm that it really works. Accelerated approval is one way that patients can receive promising new drugs when other treatment options may not exist.
  accelerated partial-breast irradiation: (ak-SEH-leh-ray-ted PAR-shul-brest ih-RAY-dee-AY-shun)
    Pronunciation of dictionary term "accelerated partial-breast irradiation"
    A type of radiation therapy given only to the part of the breast that has cancer in it. Accelerated partial-breast irradiation gives a higher dose over a shorter time than is given in standard whole-breast radiation therapy. Accelerated partial-breast irradiation may be given using internal or external sources of radiation. Also called partial-breast irradiation.
  accelerated phase chronic myelogenous leukemia: (ak-SEH-leh-ray-ted fayz KRAH-nik MY-eh-LAH-jeh-nus loo-KEE-mee-uh)
    Pronunciation of dictionary term "accelerated phase chronic myelogenous leukemia"
    A phase of chronic myelogenous leukemia in which the disease is progressing. In this phase, 10% to 19% of the cells in the blood and bone marrow are blast cells (immature blood cells).
  accelerated radiation therapy: (ak-SEH-leh-ray-ted RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "accelerated radiation therapy"
    Radiation treatment in which the total dose of radiation is given over a shorter period of time (fewer days) compared to standard radiation therapy.
  accelerated-fraction radiation therapy: (ak-SEH-leh-ray-ted-FRAK-shun RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "accelerated-fraction radiation therapy"
    Radiation treatment in which the total dose of radiation is divided into small doses and the treatments are given more than once a day. The total dose of radiation is also given over a shorter period of time (fewer days) compared to standard radiation therapy.
  Accolate: (A-koh-layt)
    Pronunciation of dictionary term "Accolate"
    A drug used to prevent and treat symptoms of asthma. It blocks substances that cause inflammation in the lungs. It is a type of antiasthmatic agent and a leukotriene receptor antagonist. Also called zafirlukast.
  ACD gene: (… jeen)
    Pronunciation of dictionary term "ACD gene"
    A gene that makes a protein involved in protecting and maintaining telomeres (the ends of chromosomes). Mutations (changes) in the ACD gene may cause damage to chromosomes and DNA, which may lead to abnormal cell growth. ACD gene mutations have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
  ACE inhibitor: (... in-HIH-bih-ter)
    Pronunciation of dictionary term "ACE inhibitor"
    A drug that is used to lower blood pressure. An ACE inhibitor is a type of antihypertensive agent. Also called angiotensin-converting enzyme inhibitor.
  acetaminophen: (uh-see-tuh-MIH-nuh-fen)
    Pronunciation of dictionary term "acetaminophen"
    A drug that reduces pain and fever (but not inflammation). It belongs to the family of drugs called analgesics.
  acetate: (A-seh-tayt)
    Pronunciation of dictionary term "acetate"
    A form of acetic acid (an acid found in vinegar).
  acetic acid: (uh-SEE-tik A-sid)
    Pronunciation of dictionary term "acetic acid"
    An acid found in vinegar. Acetic acid is also used to dissolve substances needed to make some medicines and other products, such as plastics.
  acetone: (A-seh-tone)
    Pronunciation of dictionary term "acetone"
    A chemical substance found naturally in small amounts in plants, trees, volcanoes, and forest fires. Acetone is also made by the body when fats are broken down. It is also found in tobacco smoke, car exhaust, and trash landfills. In industry, acetone is used in some plastics, fibers, medicines, household cleaners, glues, and nail polish removers. Being exposed to high levels of acetone may irritate the skin, eyes, nose, throat, and lungs. It can cause headaches, nausea, vomiting, dizziness, confusion, loss of consciousness, and other health problems.
  acetyl group: (A-seh-til groop)
    Pronunciation of dictionary term "acetyl group"
    A small molecule made of two carbon, three hydrogen, and one oxygen atoms. Acetyl groups are added to or removed from other molecules and may affect how the molecules act in the body.
  acetyl-L-carnitine: (A-seh-til ... KAR-nih-teen)
    Pronunciation of dictionary term "acetyl-L-carnitine"
    A form of the natural substance carnitine that is being studied as a way to prevent tissue damage caused by chemotherapy. Carnitine is made in muscle and liver tissue and is found in certain foods, such as meat, poultry, fish, and some dairy products. It is used by many cells in the body to make energy from fat. Also called acetyl-L-carnitine hydrochloride and ALCAR.
  acetyl-L-carnitine hydrochloride: (A-seh-til ... KAR-nih-teen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "acetyl-L-carnitine hydrochloride"
    A form of the natural substance carnitine that is being studied as a way to prevent tissue damage caused by chemotherapy. Carnitine is made in muscle and liver tissue and is found in certain foods, such as meat, poultry, fish, and some dairy products. It is used by many cells in the body to make energy from fat. Also called acetyl-L-carnitine and ALCAR.
  acetylation: (a-SEH-tih-LAY-shun)
    Pronunciation of dictionary term "acetylation"
    A chemical reaction in which a small molecule called an acetyl group is added to other molecules. Acetylation of proteins may affect how they act in the body.
  acetylcholine: (A-seh-til-KOH-leen)
    Pronunciation of dictionary term "acetylcholine"
    A chemical made by some types of nerve cells. It is used to send messages to other cells, including other nerve cells, muscle cells, and gland cells. It is released from the nerve ending and carries signals to cells on the other side of a synapse (space between nerve cells and other cells). Acetylcholine helps control memory and the action of certain muscles. It is a type of neurotransmitter.
  acetylcysteine: (A-seh-til-SIS-teh-een)
    Pronunciation of dictionary term "acetylcysteine"
    A drug usually used to reduce the thickness of mucus and ease its removal. It is also used to reverse the toxicity of high doses of acetaminophen. Also called N-acetyl-L-cysteine and N-acetylcysteine.
  ACF: Clusters of abnormal tube-like glands in the lining of the colon and rectum. ACF form before colorectal polyps and are one of the earliest changes that can be seen in the colon that may lead to cancer. Also called aberrant crypt foci.
  achlorhydria: (ay-klor-HY-dree-uh)
    Pronunciation of dictionary term "achlorhydria"
    A lack of hydrochloric acid in the digestive juices in the stomach. Hydrochloric acid helps digest food.
  acid: (A-sid)
    Pronunciation of dictionary term "acid"
    A chemical that gives off hydrogen ions in water and forms salts by combining with certain metals. Acids have a sour taste and turn certain dyes red. Some acids made by the body, such as gastric acid, can help organs work the way they should. An example of an acid is hydrochloric acid. Acidity is measured on a scale called the pH scale. On this scale, a value of 7 is neutral, and a pH value of less than 7 to 0 shows increasing acidity.
  acid-base balance: (A-sid-bays BA-lunts)
    Pronunciation of dictionary term "acid-base balance"
    In medicine, the state of having the right amount of acid and base in the blood and other body fluids. Keeping a normal acid-base balance is important for the body to work the way it should. Also called acid-base equilibrium.
  acid-base equilibrium: (A-sid-bays EE-kwuh-LIH-bree-um)
    Pronunciation of dictionary term "acid-base equilibrium"
    In medicine, the state of having the right amount of acid and base in the blood and other body fluids. Keeping a normal acid-base equilibrium is important for the body to work the way it should. Also called acid-base balance.
  acidification: (a-SIH-dih-fih-KAY-shun)
    Pronunciation of dictionary term "acidification"
    The process of making or becoming an acid. An acid is a substance that gives off hydrogen ions in water and forms salts by combining with certain metals.
  acidity: (a-SIH-dih-tee)
    Pronunciation of dictionary term "acidity"
    Describes the amount of acid in a substance. An acid is a chemical that gives off hydrogen ions in water and forms salts by combining with certain metals. Acidity is measured on a scale called the pH scale. On this scale, a pH value of 7 is neutral, and a pH value of less than 7 to 0 shows increasing acidity.
  acitretin: (A-sih-TREH-tin)
    Pronunciation of dictionary term "acitretin"
    A substance that is used in the prevention of cancer and in the treatment of psoriasis. It belongs to the family of drugs called retinoids.
  ACN53: A substance that has been studied in the treatment of some types of cancer. ACN53 is a weakened adenovirus that carries the p53 gene into tumor cells, causing them to die. It is a type of gene therapy. Also called rAd/p53, recombinant adenovirus-p53, and SCH-58500.
  acne: (AK-nee)
    Pronunciation of dictionary term "acne"
    A disorder of the skin in which oil glands and hair glands become inflamed.
  acneiform dermatitis: (ak-NEE-ih-form DER-muh-TY-tis)
    Pronunciation of dictionary term "acneiform dermatitis"
    A skin condition that causes small, raised, acne-like bumps to form, usually on the face, scalp, chest, and upper back. The bumps on the affected skin are usually red and filled with pus and may crust over. They may also become painful, tender, and itchy. Sometimes, the affected skin becomes infected. Acneiform dermatitis may be caused by an infection or by treatment with certain drugs, including some anticancer drugs, such as epidermal growth factor receptor (EGFR) inhibitors. Also called acneiform eruption and acneiform rash.
  acneiform eruption: (ak-NEE-ih-form ee-RUP-shun)
    Pronunciation of dictionary term "acneiform eruption"
    A skin condition that causes small, raised, acne-like bumps to form, usually on the face, scalp, chest, and upper back. The bumps on the affected skin are usually red and filled with pus and may crust over. They may also become painful, tender, and itchy. Sometimes, the affected skin becomes infected. Acneiform eruption may be caused by an infection or by treatment with certain drugs, including some anticancer drugs, such as epidermal growth factor receptor (EGFR) inhibitors. Also called acneiform dermatitis and acneiform rash.
  acneiform rash: (ak-NEE-ih-form …)
    Pronunciation of dictionary term "acneiform rash"
    A skin condition that causes small, raised, acne-like bumps to form, usually on the face, scalp, chest, and upper back. The bumps on the affected skin are usually red and filled with pus and may crust over. They may also become painful, tender, and itchy. Sometimes, the affected skin becomes infected. Acneiform rash may be caused by an infection or by treatment with certain drugs, including some anticancer drugs, such as epidermal growth factor receptor (EGFR) inhibitors. Also called acneiform dermatitis and acneiform eruption.
  acolbifene hydrochloride: (ay-KOLE-bih-feen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "acolbifene hydrochloride"
    A substance being studied in the prevention of breast cancer in women at high risk of breast cancer. Acolbifene hydrochloride binds to estrogen receptors in the body and blocks the effects of estrogen in the breast. It is a type of selective estrogen receptor modulator (SERM).
  acoustic: (uh-KOOS-tik)
    Pronunciation of dictionary term "acoustic"
    Having to do with sound or hearing.
  acoustic neurofibromatosis: (uh-KOOS-tik NOOR-oh-FY-broh-muh-TOH-sis)
    Pronunciation of dictionary term "acoustic neurofibromatosis"
    A genetic condition in which tumors form on the nerves of the inner ear and cause loss of hearing and balance. Tumors may also occur in the brain and on nerves in the skull and spinal cord, and may cause loss of speech, eye movement, and the ability to swallow. Also called neurofibromatosis type 2 and NF2.
    More Information
    - Neurofibromatosis type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7193/neurofibromatosis-type-2)
    - Neurofibromatosis type 2 (MedlinePlus) (https://medlineplus.gov/genetics/condition/neurofibromatosis-type-2/)
  acoustic neuroma: (uh-KOOS-tik noor-OH-muh)
    Pronunciation of dictionary term "acoustic neuroma"
    A benign (not cancer) tumor that forms on the nerves in the inner ear and can affect hearing and balance. Acoustic neuromas usually grow slowly and affect one side of the body. Common signs and symptoms include hearing loss or ringing in one ear, loss of balance, dizziness, and numbness and paralysis in the face. Sometimes these tumors may grow large and press against the facial nerve or other nearby nerves. Rarely, they may press against certain parts of the brain, which could be life threatening. Acoustic neuromas that affect the nerves in both ears are often caused by a genetic disorder called neurofibromatosis type 2. Acoustic neuromas usually occur in people aged 30 to 60 years. Also called vestibular schwannoma.
  acquired immunity: (uh-KWY-erd ih-MYOO-nih-tee)
    Pronunciation of dictionary term "acquired immunity"
    A type of immunity that develops when a person’s immune system responds to a foreign substance or microorganism, or that occurs after a person receives antibodies from another source. The two types of acquired immunity are adaptive and passive. Adaptive immunity occurs in response to being infected with or vaccinated against a microorganism. The body makes an immune response, which can prevent future infection with the microorganism. Passive immunity occurs when a person receives antibodies to a disease or toxin rather than making them through his or her own immune system.
  acquired immunodeficiency syndrome: (uh-KWY-erd IH-myoo-noh-deh-FIH-shun-see SIN-drome)
    Pronunciation of dictionary term "acquired immunodeficiency syndrome"
    A disease caused by the human immunodeficiency virus (HIV). People with acquired immunodeficiency syndrome are at an increased risk for developing certain cancers and for infections that usually occur only in individuals with a weak immune system. Also called AIDS.
  acquired pure red cell aplasia: (uh-KWY-erd … sel uh-PLAY-zhuh)
    Pronunciation of dictionary term "acquired pure red cell aplasia"
    A rare disorder in which the bone marrow makes almost no red blood cells. It may be caused by infection or by certain drugs. Patients with this disorder may also have a thymoma (a tumor of the thymus) or an autoimmune condition such as lupus erythematosus or rheumatoid arthritis.
  acquired thrombotic thrombocytopenic purpura: (uh-KWY-erd throm-BAH-tik THROM-boh-sy-toh-PEE-nik PUR-pyoo-ruh)
    Pronunciation of dictionary term "acquired thrombotic thrombocytopenic purpura"
    A rare condition in which blood clots form in small blood vessels throughout the body. These clots can block the flow of blood and oxygen to the body’s organs, which leads to a lower-than-normal number of platelets in the blood. Signs and symptoms of acquired thrombotic thrombocytopenic purpura include purple bruises or tiny red or purple spots on the skin, bleeding problems, anemia, fever, chest pain, nervous system problems, and kidney problems. acquired thrombotic thrombocytopenic purpura occurs when the body starts producing antibodies that block an enzyme called ADAMTS13, which is involved in blood clotting. It may be brought on by certain diseases or conditions (such as pregnancy, cancer, lupus, HIV, or other infections), certain medicines (such as chemotherapy or hormone therapy), or certain procedures (such as surgery or a stem cell transplant). acquired thrombotic thrombocytopenic purpura usually occurs in adults. Also called aTTP.
  acral lentiginous melanoma: (AK-rul len-TIH-jih-nus MEH-luh-NOH-muh)
    Pronunciation of dictionary term "acral lentiginous melanoma"
    A rare type of melanoma that occurs in areas of the body that are usually not exposed to sunlight, such as the palms of the hands, bottoms of the feet, or under the nails. Melanoma is a type of cancer that begins in melanocytes (cells that make a substance called melanin, which gives color to skin and eyes). Acral lentiginous melanoma can occur in anyone, but it is more common in people with darker skin tones. Also called acral melanoma.
  acral melanoma: (AK-rul MEH-luh-NOH-muh)
    Pronunciation of dictionary term "acral melanoma"
    A rare type of melanoma that occurs in areas of the body that are usually not exposed to sunlight, such as the palms of the hands, bottoms of the feet, or under the nails. Melanoma is a type of cancer that begins in melanocytes (cells that make a substance called melanin, which gives color to skin and eyes). Acral melanoma can occur in anyone, but it is more common in people with darker skin tones. Also called acral lentiginous melanoma.
  acridine carboxamide: (A-krih-deen kar-BOK-suh-mide)
    Pronunciation of dictionary term "acridine carboxamide"
    A substance being studied in the treatment of cancer. It is a type of topoisomerase inhibitor. Also called DACA.
  acrochordon: (A-kroh-KOR-dun)
    Pronunciation of dictionary term "acrochordon"
    A common benign (not cancer) skin growth that appears as a small, raised, brown or skin-colored bump that may have a short, narrow stalk. Acrochordons usually occur in areas where the skin folds, such as the neck, armpit, inner thigh, and eyelid. They are usually painless and do not grow or change but may become painful if rubbed or scratched. They most often occur in older adults and in people who are overweight or have diabetes. Also called skin tag.
  acromegaly: (A-kroh-MEH-guh-lee)
    Pronunciation of dictionary term "acromegaly"
    A condition in which the pituitary gland makes too much growth hormone after normal growth of the skeleton is finished. This causes the bones of the hands, feet, head, and face to grow larger than normal. Acromegaly can be caused by a pituitary gland tumor.
  acrylonitrile: (ak-rih-loh-NY-tril)
    Pronunciation of dictionary term "acrylonitrile"
    A substance used to make plastics, rubber, and textiles. Being exposed to acrylonitrile may increase the risk of developing certain cancers, such as lung, brain, or prostate cancer.
  Actemra: (ak-TEM-ruh)
    Pronunciation of dictionary term "Actemra"
    A drug used to treat adults and children aged 2 years and older with severe or life-threatening cytokine release syndrome caused by a type of immunotherapy called chimeric antigen receptor (CAR) T-cell therapy. Actemra is also used to treat certain types of arthritis and a condition that causes inflammation of the lining of the arteries. It is also being studied in the treatment of other conditions. Actemra binds to receptors for a protein called interleukin-6 (IL-6), which is made by white blood cells and other cells in the body. This may help lower the body’s immune response and reduce inflammation. Actemra is a type of monoclonal antibody. Also called tocilizumab.
    More Information
    - Tocilizumab (https://www.cancer.gov/about-cancer/treatment/drugs/tocilizumab)
  ACTH: A hormone made in the pituitary gland. ACTH acts on the outer part of the adrenal gland to control its release of corticosteroid hormones. More ACTH is made during times of stress. Also called adrenocorticotropic hormone and corticotropin.
  ACTHoma: (… OH-muh)
    Pronunciation of dictionary term "ACTHoma"
    A rare tumor that makes the hormone adrenocorticotropin (ACTH), which causes the adrenal glands to make too much cortisol. ACTHomas can lead to Cushing syndrome. Signs and symptoms of ACTHomas and Cushing syndrome include a round face, thin arms and legs, severe fatigue and muscle weakness, high blood pressure, high blood sugar, purple or pink stretch marks on the skin, and weight gain, especially in the abdomen. ACTHomas usually form in the pituitary gland or in the islet cells of the pancreas, but they may also form in other organs, including the lung, thyroid, and thymus. ACTHomas may be benign (not cancer) or malignant (cancer). Also called adrenocorticotropic-secreting tumor.
  Actinex: (AK-tih-nex)
    Pronunciation of dictionary term "Actinex"
    A drug put on the skin to treat growths caused by sun exposure. A form of Actinex that is taken by mouth is being studied in the treatment of prostate cancer. Actinex is an antioxidant, and it may block certain enzymes needed for tumor growth. Also called masoprocol, NDGA, and nordihydroguaiaretic acid.
  actinic keratosis: (ak-TIH-nik KAYR-uh-TOH-sis)
    Pronunciation of dictionary term "actinic keratosis"
    A thick, scaly patch of skin that may become cancer. It usually forms on areas exposed to the sun, such as the face, scalp, back of the hands, or chest. It is most common in people with fair skin. Also called senile keratosis and solar keratosis.
  actinomycin D: (AK-tih-noh-MY-sin …)
    Pronunciation of dictionary term "actinomycin D"
    A drug that comes from the bacterium Streptomyces parvulus and is used alone or with other drugs to treat adults and children with Ewing sarcoma, gestational trophoblastic tumor, rhabdomyosarcoma, Wilms tumor, or certain types of testicular cancer and adults with certain types of solid tumors. It is also being studied in the treatment of other types of cancer. Actinomycin D damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic. Also called Cosmegen and dactinomycin.
    More Information
    - Dactinomycin (https://www.cancer.gov/about-cancer/treatment/drugs/dactinomycin)
  action study: (AK-shun STUH-dee)
    Pronunciation of dictionary term "action study"
    In cancer prevention clinical trials, a study that focuses on finding out whether actions people take can prevent cancer.
  Actiq: (AK-tik)
    A drug used to treat severe pain in people with chronic conditions, such as cancer, who have not gotten better after treatment with other opioids. It is also used to treat pain after surgery. Actiq works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and alters how the body responds to pain. It is a type of synthetic opioid agonist that acts as an analgesic (pain reliever). Also called fentanyl citrate.
    More Information
    - Cancer Pain
  Activase: (AK-tih-vays)
    Pronunciation of dictionary term "Activase"
    A form of tissue plasminogen activator that is made in the laboratory. It helps dissolve blood clots and is used to treat heart attacks, strokes, and clots in the lungs. It is also being studied in the treatment of cancer. It is a type of systemic thrombolytic agent. Also called Alteplase, r-tPA, and recombinant tissue plasminogen activator.
  activate: (AK-tih-vayt)
    Pronunciation of dictionary term "activate"
    In biology, to stimulate a cell in a resting state to become active. This causes biochemical and functional changes in the activated cell.
  active monitoring: (AK-tiv MAH-nih-ter-ing)
    Pronunciation of dictionary term "active monitoring"
    A treatment plan that involves closely watching a patient’s condition but not giving any treatment unless there are changes in test results that show the condition is getting worse. Active monitoring may be used to avoid or delay the need for treatments such as radiation therapy or surgery, which can cause side effects or other problems. During active monitoring, certain exams and tests are done on a regular schedule. It may be used in the treatment of certain types of cancer, such as prostate cancer, urethral cancer, and intraocular (eye) melanoma. Active monitoring is a type of expectant management. Also called active surveillance.
  active pharmaceutical ingredient: (AK-tiv FAR-muh-SOO-tih-kul in-GREE-dee-ent)
    Pronunciation of dictionary term "active pharmaceutical ingredient"
    The main ingredient in a medicine that causes the desired effect of the medicine. Some medicines contain more than one active pharmaceutical ingredient that act in different ways in the body. Also called API, drug substance, and pharmacologic substance.
  active surveillance: (AK-tiv ser-VAY-lents)
    Pronunciation of dictionary term "active surveillance"
    Closely watching a patient’s condition but not giving any treatment unless there are changes in test results that show the condition is getting worse. Active surveillance may be used to avoid or delay the need for treatments such as radiation therapy or surgery, which can cause side effects or other problems. During active surveillance, certain exams and tests, such as blood tests, imaging tests, and biopsies, are done on a regular schedule to monitor the condition. Active surveillance may be used in certain types of prostate cancer and in some other types of cancer. It is a type of expectant management.
  active treatment: (AK-tiv TREET-ment)
    Pronunciation of dictionary term "active treatment"
    In a clinical trial, a positive control group that receives a known, proven active intervention.
  activities of daily living: (ak-TIH-vih-teez…DAY-lee LIH-ving)
    Pronunciation of dictionary term "activities of daily living"
    The tasks of everyday life. These activities include eating, dressing, getting into or out of a bed or chair, taking a bath or shower, and using the toilet. Instrumental activities of daily living are activities related to independent living and include preparing meals, managing money, shopping, doing housework, and using a telephone. Also called ADL.
  Actos: (AK-tose)
    Pronunciation of dictionary term "Actos"
    A drug that is used to treat type 2 diabetes and is being studied in the prevention of head and neck cancer. It may be able to stop leukoplakia (a condition affecting the mouth ) from developing into cancer. It is a type of thiazolidinedione. Also called pioglitazone.
  acupoint: (AK-yoo-poynt)
    Pronunciation of dictionary term "acupoint"
    A specific spot on the body where an acupuncture needle may be inserted to control pain and other symptoms. Also called acupuncture point.
    More Information
    - Acupuncture
  acupressure: (AK-yoo-PREH-sher)
    Pronunciation of dictionary term "acupressure"
    The application of pressure or localized massage to specific sites on the body to control symptoms such as pain or nausea. It is a type of complementary and alternative medicine.
  acupuncture: (AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "acupuncture"
    The technique of inserting thin needles through the skin at specific points on the body to control pain and other symptoms. It is a type of complementary and alternative medicine.
    More Information
    - Acupuncture
  acupuncture needle: (AK-yoo-PUNK-cher NEE-dul)
    Pronunciation of dictionary term "acupuncture needle"
    A stainless steel needle that is slightly thicker than a human hair. Acupuncture needles are inserted through the skin at specific points on the body to control pain and other symptoms.
    More Information
    - Acupuncture
  acupuncture point: (AK-yoo-PUNK-cher poynt)
    Pronunciation of dictionary term "acupuncture point"
    A specific spot on the body where an acupuncture needle may be inserted to control pain and other symptoms. Also called acupoint.
    More Information
    - Acupuncture
  acupuncture point injection: (AK-yoo-PUNK-cher poynt in-JEK-shun)
    Pronunciation of dictionary term "acupuncture point injection"
    A procedure in which drugs, vitamins, herbal extracts, or other fluids are injected into the body at an acupuncture point using a syringe and needle.
  acupuncture-like transcutaneous electrical nerve stimulation: (AK-yoo-PUNK-cher-like tranz-kyoo-TAY-nee-us ee-LEK-trih-kul nerv STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "acupuncture-like transcutaneous electrical nerve stimulation"
    A procedure in which mild electric currents are applied to certain acupuncture points (spots on the body where an acupuncture needle may be inserted to control pain and other symptoms) on the skin. It is being studied in the treatment of dry mouth caused by radiation therapy for cancer. Also called ALTENS.
  acupuncturist: (AK-yoo-PUNK-cheh-rist)
    Pronunciation of dictionary term "acupuncturist"
    A person trained in acupuncture (therapy that uses thin needles inserted through the skin at specific points on the body to control pain and other symptoms). Acupuncture is a type of complementary and alternative medicine.
  acustimulation: (AK-yoo-STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "acustimulation"
    Mild electrical stimulation of acupuncture points to control symptoms such as nausea and vomiting.
  acute: (uh-KYOOT)
    Pronunciation of dictionary term "acute"
    Symptoms or signs that begin and worsen quickly; not chronic.
  acute bacterial prostatitis: (uh-KYOOT bak-TEER-ee-ul PROS-tuh-TY-tis)
    Pronunciation of dictionary term "acute bacterial prostatitis"
    Inflammation of the prostate gland that begins suddenly and gets worse quickly. It is caused by a bacterial infection. Symptoms include fever and chills, body aches, pain in the lower back and genital area, a burning feeling during urination, and problems with emptying the bladder all the way.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  acute leukemia: (uh-KYOOT loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute leukemia"
    A rapidly progressing cancer that starts in blood-forming tissue such as the bone marrow, and causes large numbers of white blood cells to be produced and enter the blood stream.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute lymphoblastic leukemia: (uh-KYOOT LIM-foh-BLAS-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute lymphoblastic leukemia"
    A type of leukemia (blood cancer) that comes on quickly and is fast growing. In acute lymphoblastic leukemia, there are too many lymphoblasts (immature white blood cells) in the blood and bone marrow. Also called acute lymphocytic leukemia and ALL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute lymphocytic leukemia: (uh-KYOOT LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute lymphocytic leukemia"
    A type of leukemia (blood cancer) that comes on quickly and is fast growing. In acute lymphocytic leukemia, there are too many lymphoblasts (immature white blood cells) in the blood and bone marrow. Also called acute lymphoblastic leukemia and ALL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute myeloblastic leukemia: (uh-KYOOT MY-eh-loh-BLAS-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute myeloblastic leukemia"
    An aggressive (fast-growing) disease in which too many myeloblasts (immature white blood cells that are not lymphoblasts) are found in the bone marrow and blood. Also called acute myelogenous leukemia, acute myeloid leukemia, acute nonlymphocytic leukemia, AML, and ANLL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute myelogenous leukemia: (uh-KYOOT MY-eh-LAH-jeh-nus loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute myelogenous leukemia"
    A fast-growing cancer in which too many myeloblasts (a type of immature white blood cell) are found in the bone marrow and blood. Acute myelogenous leukemia usually gets worse quickly if it is not treated. It can spread outside the blood to other parts of the body, including the lymph nodes, spleen, liver, central nervous system (brain and spinal cord), skin, gums, and testicles. Acute myelogenous leukemia is most common in older adults. Also called acute myeloid leukemia, acute nonlymphocytic leukemia, AML, and ANLL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute myeloid leukemia: (uh-KYOOT MY-eh-loyd loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute myeloid leukemia"
    A fast-growing cancer in which too many myeloblasts (a type of immature white blood cell) are found in the bone marrow and blood. Acute myeloid leukemia usually gets worse quickly if it is not treated. It can spread outside the blood to other parts of the body, including the lymph nodes, spleen, liver, central nervous system (brain and spinal cord), skin, gums, and testicles. Acute myeloid leukemia is most common in older adults. Also called acute myelogenous leukemia, acute nonlymphocytic leukemia, AML, and ANLL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute myeloid leukemia with myelodysplasia-related changes: (uh-KYOOT MY-eh-loyd loo-KEE-mee-uh … MY-eh-loh-dis-PLAY-zhuh-ree-LAY-ted CHAYN-jiz)
    Pronunciation of dictionary term "acute myeloid leukemia with myelodysplasia-related changes"
    A type of acute myeloid leukemia in which at least 20% of a patient’s blood or bone marrow is myeloblasts (immature white blood cells) and the patient has one of the following conditions: 1) has had myelodysplastic syndrome (MDS) or a myelodysplastic/myeloproliferative neoplasm (MDS/MPN) before, 2) cells that have changes in certain chromosomes that are similar to those found in MDS, or 3) at least 50% of the cells (of at least two types of blood cells) are abnormal. Acute myeloid leukemia with myelodysplasia-related changes usually occurs in older adults and has a poor prognosis. Also called AML-MRC.
  acute nonlymphocytic leukemia: (uh-KYOOT non-LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute nonlymphocytic leukemia"
    A fast-growing cancer in which too many myeloblasts (a type of immature white blood cell) are found in the bone marrow and blood. Acute nonlymphocytic leukemia usually gets worse quickly if it is not treated. It can spread outside the blood to other parts of the body, including the lymph nodes, spleen, liver, central nervous system (brain and spinal cord), skin, gums, and testicles. Acute nonlymphocytic leukemia is most common in older adults. Also called acute myelogenous leukemia, acute myeloid leukemia, AML, and ANLL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  acute pain: (uh-KYOOT payn)
    Pronunciation of dictionary term "acute pain"
    Pain that comes on quickly, can be severe, but lasts a relatively short time.
    More Information
    - Pain in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
    - Cancer Pain
  acute paronychia: (uh-KYOOT PAYR-uh-NIH-kee-uh)
    Pronunciation of dictionary term "acute paronychia"
    An infection of the soft tissue around a fingernail or toenail that begins suddenly and can get worse quickly. It is usually caused when bacteria enter through a break in the skin from a hangnail or ingrown toenail, by damage to the cuticle (skin at the base of the nail), or by an injury to the area where the nail and skin meet. Acute paronychia may also sometimes be caused by treatment with certain drugs used to treat cancer or immune system disorders. Signs and symptoms include pain, tenderness, warmth, redness, and swelling around the nail. Pus may form in the skin around or under the nail. When treated, acute paronychia usually heals within 10 days.
  acute promyelocytic leukemia: (uh-KYOOT proh-MY-eh-loh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "acute promyelocytic leukemia"
    An aggressive (fast-growing) type of acute myeloid leukemia in which there are too many immature blood-forming cells in the blood and bone marrow. It is usually marked by an exchange of parts of chromosomes 15 and 17. Also called APL and promyelocytic leukemia.
  acute radiation sickness: (uh-KYOOT RAY-dee-AY-shun SIK-nes)
    Pronunciation of dictionary term "acute radiation sickness"
    Serious illness caused by being exposed to high doses of certain types of radiation, usually over a short period of time. Symptoms of acute radiation sickness usually occur right after exposure but they may happen over time, and they may come and go. Symptoms include nausea and vomiting, diarrhea, headache, dizziness, weakness, fatigue, bleeding, hair loss, swelling, itching, and redness of the skin, and other skin problems. Very large doses of radiation may cause death. Also called acute radiation syndrome, radiation poisoning, radiation sickness, and radiation sickness syndrome.
  acute radiation syndrome: (uh-KYOOT RAY-dee-AY-shun SIN-drome)
    Pronunciation of dictionary term "acute radiation syndrome"
    Serious illness caused by being exposed to high doses of certain types of radiation, usually over a short period of time. Symptoms of acute radiation syndrome usually occur right after exposure but they may happen over time, and they may come and go. Symptoms include nausea and vomiting, diarrhea, headache, dizziness, weakness, fatigue, bleeding, hair loss, swelling, itching, and redness of the skin, and other skin problems. Very large doses of radiation may cause death. Also called acute radiation sickness, radiation poisoning, radiation sickness, and radiation sickness syndrome.
  acyclovir: (ay-SY-kloh-veer)
    Pronunciation of dictionary term "acyclovir"
    A substance used to prevent or treat cytomegalovirus and herpes simplex infections that may occur when the body is immunosuppressed. It belongs to the family of drugs called antivirals.
  AD 32: A drug used to treat bladder carcinoma in situ that did not get better after treatment with bacillus Calmette-Guerin (BCG). It is used in patients who cannot have surgery right away to remove all or part of the bladder. AD 32 is given as a solution through a catheter that is placed into the bladder. It blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. AD 32 is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called valrubicin and Valstar.
    More Information
    - Valrubicin (https://www.cancer.gov/about-cancer/treatment/drugs/valrubicin)
  ADA-SCID: A rare, inherited disorder in which the immune system is damaged, causing a person to have a complete lack of B lymphocytes and T lymphocytes (types of white blood cells that help the body fight infection). People with ADA-SCID are at high risk of developing life-threatening viral, bacterial, and fungal infections and certain types of cancers. Signs and symptoms of ADA-SCID usually occur before 6 months of age and include serious lung infections, chronic diarrhea, skin rashes, and slow growth and development. When symptoms begin later in life, they are usually milder. ADA-SCID is caused by mutations (changes) in the ADA gene. The ADA gene makes an enzyme called adenosine deaminase, which helps protect lymphocytes from harmful substances in the body. Also called adenosine deaminase-deficient severe combined immunodeficiency.
    More Information
    - Adenosine deaminase deficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5748/adenosine-deaminase-deficiency)
    - Adenosine deaminase deficiency (MedlinePlus) (https://medlineplus.gov/genetics/condition/adenosine-deaminase-deficiency/)
  adagrasib: (a-dah-GRA-sib)
    Pronunciation of dictionary term "adagrasib"
    A drug used alone or with cetuximab to treat adults with colorectal cancer or non-small cell lung cancer that has spread and has a certain mutation (change) in the KRAS gene. It is used in patients whose cancer was treated with other systemic therapy. It is also being studied in the treatment of other types of cancer. Adagrasib blocks a protein (KRAS G12C) made by the mutated KRAS gene, which may help keep cancer cells from growing and may kill them. It is a type of targeted therapy. Also called Krazati.
    More Information
    - Adagrasib (https://www.cancer.gov/about-cancer/treatment/drugs/adagrasib)
  adaptive immunity: (uh-DAP-tiv ih-MYOO-nih-tee)
    Pronunciation of dictionary term "adaptive immunity"
    A type of immunity that develops when a person’s immune system responds to a foreign substance or microorganism, such as after an infection or vaccination. Adaptive immunity involves specialized immune cells and antibodies that attack and destroy foreign invaders and are able to prevent disease in the future by remembering what those substances look like and mounting a new immune response. Adaptive immunity may last for a few weeks or months or for a long time, sometimes for a person’s entire life.
  ADC: A substance made up of a monoclonal antibody chemically linked to a drug. The monoclonal antibody binds to specific proteins or receptors found on certain types of cells, including cancer cells. The linked drug enters these cells and kills them without harming other cells. Some ADCs are used to treat cancer. Also called antibody-drug conjugate.
  ADCC: A type of immune reaction in which a target cell or microbe is coated with antibodies and killed by certain types of white blood cells. The white blood cells bind to the antibodies and release substances that kill the target cells or microbes. Also called antibody-dependent cell-mediated cytotoxicity and antibody-dependent cellular cytotoxicity.
  Adcetris: (ad-SEH-tris)
    Pronunciation of dictionary term "Adcetris"
    A drug used alone or with other drugs to treat adults with certain types of classic Hodgkin lymphoma, cutaneous or systemic anaplastic large cell lymphoma, large B-cell lymphoma, mycosis fungoides, or peripheral T-cell lymphoma, and with other drugs to treat children aged 2 years and older with certain types of classic Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Adcetris contains a monoclonal antibody that binds to a protein called CD30, which is found on some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. Adcetris is a type of antibody-drug conjugate. Also called brentuximab vedotin and SGN-35.
    More Information
    - Brentuximab Vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/brentuximabvedotin)
  Adderall: (A-deh-rawl)
    Pronunciation of dictionary term "Adderall"
    A combination of drugs used as a treatment for attention deficit hyperactivity disorder (ADHD) and narcolepsy (a sleep disorder). It is a type of stimulant. Also called dextroamphetamine-amphetamine.
  addiction: (uh-DIK-shun)
    Pronunciation of dictionary term "addiction"
    An uncontrollable craving, seeking, and use of a substance, such as a drug or alcohol.
  Addison disease: (A-dih-sun dih-ZEEZ)
    Pronunciation of dictionary term "Addison disease"
    A rare disorder in which the adrenal glands do not make enough of certain hormones. Symptoms include weight loss, loss of appetite, nausea and vomiting, diarrhea, muscle weakness, fatigue, low blood sugar, low blood pressure, and patchy or dark skin. Most cases of the disorder are caused by immune system problems, but may also be caused by infection, cancer, or other diseases. Also called adrenal insufficiency.
  ADE: An abbreviation for a chemotherapy combination used to treat childhood acute myeloid leukemia (AML). It includes the drugs cytarabine (Ara-C), daunorubicin hydrochloride, and etoposide phosphate. Also called ADE regimen.
    More Information
    - ADE (https://www.cancer.gov/about-cancer/treatment/drugs/ADE)
  ADE regimen: (… REH-jih-men)
    Pronunciation of dictionary term "ADE regimen"
    An abbreviation for a chemotherapy combination used to treat childhood acute myeloid leukemia (AML). It includes the drugs cytarabine (Ara-C), daunorubicin hydrochloride, and etoposide phosphate. Also called ADE.
    More Information
    - ADE (https://www.cancer.gov/about-cancer/treatment/drugs/ADE)
  adenine: (A-deh-neen)
    Pronunciation of dictionary term "adenine"
    A chemical compound that is used to make one of the building blocks of DNA and RNA. It is also a part of many substances in the body that give energy to cells. Adenine is a type of purine.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  adenocarcinoma: (A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "adenocarcinoma"
    Cancer that forms in the glandular tissue, which lines certain internal organs and makes and releases substances in the body, such as mucus, digestive juices, and other fluids. Most cancers of the breast, lung, esophagus, stomach, colon, rectum, pancreas, prostate, and uterus are adenocarcinomas.
  adenocarcinoma in situ: (A-deh-noh-KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "adenocarcinoma in situ"
    A condition in which abnormal cells are found in the glandular tissue, which lines certain internal organs and makes and releases substances in the body, such as mucus, digestive juices, and other fluids. These abnormal cells may become cancer and spread into nearby normal tissue. Adenocarcinoma in situ occurs most often in the cervix and lung. Also called AIS.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  adenoid cystic carcinoma: (A-deh-noyd SIS-tik KAR-sih-NOH-muh)
    Pronunciation of dictionary term "adenoid cystic carcinoma"
    A rare type of cancer that begins in cells that line certain internal organs and make and release substances in the body, such as mucus, saliva, or other fluids. Adenoid cystic carcinoma occurs most often in the salivary glands, but it can also occur in other parts of the body, such as the voice box, windpipe, lacrimal gland (the gland that makes tears), breast, and uterus. Adenoid cystic carcinoma usually grows slowly. It tends to spread along the nerves to nearby tissue and in the blood. In rare cases, it may spread to the lymph nodes or to other parts of the body, especially the lungs.
  adenoma: (A-deh-NOH-muh)
    Pronunciation of dictionary term "adenoma"
    A tumor that is not cancer. It starts in gland-like cells of the epithelial tissue (thin layer of tissue that covers organs, glands, and other structures within the body).
  adenopathy: (A-deh-NAH-puh-thee)
    Pronunciation of dictionary term "adenopathy"
    Large or swollen lymph glands.
  adenosarcoma: (A-deh-noh-sar-KOH-muh)
    Pronunciation of dictionary term "adenosarcoma"
    A tumor that is a mixture of an adenoma (a tumor that starts in the gland-like cells of epithelial tissue) and a sarcoma (a tumor that starts in bone, cartilage, fat, muscle, blood vessels, or other connective or supportive tissue). An example of an adenosarcoma is Wilms tumor.
  adenosine deaminase-deficient severe combined immunodeficiency: (uh-DEH-nuh-seen dee-A-mih-nays-deh-FIH-shunt seh-VEER kum-BIND IH-myoo-noh-deh-FIH-shun-see)
    Pronunciation of dictionary term "adenosine deaminase-deficient severe combined immunodeficiency"
    A rare, inherited disorder in which the immune system is damaged, causing a person to have a complete lack of B lymphocytes and T lymphocytes (types of white blood cells that help the body fight infection). People with adenosine deaminase-deficient severe combined immunodeficiency are at high risk of developing life-threatening viral, bacterial, and fungal infections and certain types of cancers. Signs and symptoms of adenosine deaminase-deficient severe combined immunodeficiency usually occur before 6 months of age and include serious lung infections, chronic diarrhea, skin rashes, and slow growth and development. When symptoms begin later in life, they are usually milder. Adenosine deaminase-deficient severe combined immunodeficiency is caused by mutations (changes) in the ADA gene. The ADA gene makes an enzyme called adenosine deaminase, which helps protect lymphocytes from harmful substances in the body. Also called ADA-SCID.
    More Information
    - Adenosine deaminase deficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5748/adenosine-deaminase-deficiency)
    - Adenosine deaminase deficiency (MedlinePlus) (https://medlineplus.gov/genetics/condition/adenosine-deaminase-deficiency/)
  adenosine triphosphate: (uh-DEH-nuh-seen try-FOS-fayt)
    Pronunciation of dictionary term "adenosine triphosphate"
    A substance present in all living cells that provides energy for many metabolic processes and is involved in making RNA. Adenosine triphosphate made in the laboratory is being studied in patients with advanced solid tumors to see if it can decrease weight loss and improve muscle strength. Also called ATP.
  adenosis: (A-deh-NOH-sis)
    Pronunciation of dictionary term "adenosis"
    A disease or abnormal change in a gland. Breast adenosis is a benign condition in which the lobules are larger than usual.
  adenosquamous carcinoma: (A-deh-noh-SKWAY-mus KAR-sih-NOH-muh)
    Pronunciation of dictionary term "adenosquamous carcinoma"
    A type of cancer that contains two types of cells: squamous cells (thin, flat cells that line certain organs) and gland-like cells.
  adenovirus: (A-den-oh-VY-rus)
    Pronunciation of dictionary term "adenovirus"
    A member of a family of viruses that can cause infections in the respiratory tract, eye, and gastrointestinal tract. Forms of adenoviruses that do not cause disease are used in gene therapy. They carry genes that may fix defects in cells or kill cancer cells.
  adenovirus vector: (A-deh-noh-VY-rus VEK-ter)
    Pronunciation of dictionary term "adenovirus vector"
    A form of a common virus called adenovirus that is used to deliver genetic material, such as a new gene or a normal copy of a mutated (changed) gene, directly into the nucleus of a cell. Before adenovirus is used in this way, it is changed in the laboratory so that it cannot cause disease in people. When an adenovirus vector is used for gene therapy, a broken, defective, or missing gene inside the body's cells can be repaired or replaced with a healthy version of that gene. Adenovirus vectors may also carry genes that can change abnormal cells, such as cancer cells, back to normal. And they may be used in vaccines to help prevent certain types of viral infections.
  ADH: A benign (not cancer) condition in which there are more cells than normal in the lining of breast ducts and the cells look abnormal under a microscope. Having ADH increases the risk of breast cancer. Also called atypical ductal breast hyperplasia and atypical ductal hyperplasia.
  ADI-PEG 20: A substance being studied in the treatment of melanoma, liver cancer, and other types of cancer. It breaks down the amino acid arginine and may block the growth of cancer cells that need arginine to grow. It is a type of iminohydrolase. Also called pegylated arginine deiminase.
  adipokine: (A-dih-poh-kine)
    Pronunciation of dictionary term "adipokine"
    One of a large group of molecules that is made by fat cells in the body. Adipokines circulate in the blood and help control many important body functions, including appetite, fat storage, glucose and fat metabolism, blood pressure, inflammation, and immune response. Changes in the levels of adipokines in the blood may play a role in the development of obesity and other diseases, such as diabetes, heart disease, and cancer. Adipokines can act as hormones, growth factors, and cytokines, and include the molecules leptin, adiponectin, resistin, and many others.
  adjunct agent: (A-junkt AY-jent)
    Pronunciation of dictionary term "adjunct agent"
    In cancer therapy, a drug or substance used in addition to the primary therapy.
  adjunct therapy: (A-junkt THAYR-uh-pee)
    Pronunciation of dictionary term "adjunct therapy"
    Another treatment used together with the primary treatment. Its purpose is to assist the primary treatment. Also called adjunctive therapy.
  adjunctive therapy: (A-junk-tiv THAYR-uh-pee)
    Pronunciation of dictionary term "adjunctive therapy"
    Another treatment used together with the primary treatment. Its purpose is to assist the primary treatment. Also called adjunct therapy.
  adjustment disorder: (uh-JUST-ment dis-OR-der)
    Pronunciation of dictionary term "adjustment disorder"
    A condition in which a person responds to a stressful event (such as an illness, job loss, or divorce) with extreme emotions and actions that cause problems at work and home.
    More Information
    - Adjustment to Cancer: Anxiety and Distress
  adjuvant chemotherapy: (A-juh-vunt KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "adjuvant chemotherapy"
    Anticancer drugs given after the primary (or first) treatment to kill any cancer cells that remain in the body and to lower the risk that the cancer will come back. For example, adjuvant chemotherapy may be given after breast cancer surgery to kill any remaining breast cancer cells and to help keep the cancer from coming back. Adjuvant chemotherapy may sometimes be called preventative chemotherapy.
  adjuvant therapy: (A-juh-vunt THAYR-uh-pee)
    Pronunciation of dictionary term "adjuvant therapy"
    Additional cancer treatment given after the primary treatment to lower the risk that the cancer will come back. Adjuvant therapy may include chemotherapy, radiation therapy, hormone therapy, targeted therapy, or biological therapy.
  ADL: Activities of daily living. The tasks of everyday life. Basic ADLs include eating, dressing, getting into or out of a bed or chair, taking a bath or shower, and using the toilet. Instrumental activities of daily living (IADL) are activities related to independent living and include preparing meals, managing money, shopping, doing housework, and using a telephone. Also called activities of daily living.
  administration: (ad-MIH-nih-STRAY-shun)
    Pronunciation of dictionary term "administration"
    In medicine, the act of giving a treatment, such as a drug, to a patient. It can also refer to the way it is given, the dose, or how often it is given.
  adnexal mass: (ad-NEK-sul…)
    Pronunciation of dictionary term "adnexal mass"
    A lump in tissue near the uterus, usually in the ovary or fallopian tube. Adnexal masses include ovarian cysts, ectopic (tubal) pregnancies, and benign (not cancer) or malignant (cancer) tumors.
  ado-trastuzumab emtansine: (A-doh-tras-TOO-zoo-mab em-TAN-seen)
    Pronunciation of dictionary term "ado-trastuzumab emtansine"
    A drug used to treat certain patients with HER2-positive breast cancer that has already been treated with trastuzumab and a type of anticancer drug called a taxane. It is also being studied in the treatment of other types of cancer. Ado-trastuzumab emtansine contains a monoclonal antibody called trastuzumab that binds to a protein called HER2, which is found on some breast cancer cells. It also contains an anticancer drug called DM1, which may help kill cancer cells. Ado-trastuzumab emtansine is a type of antibody-drug conjugate. Also called Kadcyla and T-DM1.
    More Information
    - Ado-Trastuzumab Emtansine (https://www.cancer.gov/about-cancer/treatment/drugs/ado-trastuzumab-emtansine)
  adolescent: (A-doh-LEH-sent)
    Pronunciation of dictionary term "adolescent"
    A young person who has begun puberty but has not yet become an adult. During adolescence, a child experiences physical, hormonal, and developmental changes that mark the transition into adulthood. Adolescence generally occurs between the ages of 10 and 19 years.
    More Information
    - Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
    - Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
  adoptive cell therapy: (uh-DOP-tiv sel THAYR-uh-pee)
    Pronunciation of dictionary term "adoptive cell therapy"
    A type of immunotherapy in which T cells (a type of immune cell) are given to a patient to help the body fight diseases, such as cancer. In cancer therapy, T cells are usually taken from the patient's own blood or tumor tissue, grown in large numbers in the laboratory, and then given back to the patient to help the immune system fight the cancer. Sometimes, the T cells are changed in the laboratory to make them better able to target the patient's cancer cells and kill them. Types of adoptive cell therapy include chimeric antigen receptor T-cell (CAR T-cell) therapy and tumor-infiltrating lymphocyte (TIL) therapy. Adoptive cell therapy that uses T cells from a donor is being studied in the treatment of some types of cancer and some infections. Also called adoptive cell transfer, cellular adoptive immunotherapy, and T-cell transfer therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
    T-Cell Transfer Therapy
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called T-cell transfer therapy that is used to treat cancer.
    YouTube (https://www.youtube.com/watch?v=kfi-2fPp4dE)
  adoptive cell transfer: (uh-DOP-tiv sel TRANZ-fer)
    Pronunciation of dictionary term "adoptive cell transfer"
    A type of immunotherapy in which T cells (a type of immune cell) are given to a patient to help the body fight diseases, such as cancer. In cancer therapy, T cells are usually taken from the patient's own blood or tumor tissue, grown in large numbers in the laboratory, and then given back to the patient to help the immune system fight the cancer. Sometimes, the T cells are changed in the laboratory to make them better able to target the patient's cancer cells and kill them. Types of adoptive cell transfer include chimeric antigen receptor T-cell (CAR T-cell) therapy and tumor-infiltrating lymphocyte (TIL) therapy. Adoptive cell transfer that uses T cells from a donor is being studied in the treatment of some types of cancer and some infections. Also called adoptive cell therapy, cellular adoptive immunotherapy, and T-cell transfer therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
    T-Cell Transfer Therapy
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called T-cell transfer therapy that is used to treat cancer.
    YouTube (https://www.youtube.com/watch?v=kfi-2fPp4dE)
  adrenal cancer: (uh-DREE-nul KAN-ser)
    Pronunciation of dictionary term "adrenal cancer"
    Cancer that forms in the tissues of the adrenal glands (two glands located just above the kidneys). The adrenal glands make hormones that control heart rate, blood pressure, and other important body functions. Adrenal cancer that starts in the outside layer of the adrenal gland is called adrenocortical carcinoma. Adrenal cancer that starts in the center of the adrenal gland is called malignant pheochromocytoma.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  adrenal cortex: (uh-DREE-nul KOR-tex)
    Pronunciation of dictionary term "adrenal cortex"
    The outer part of the adrenal gland (a small organ on top of each kidney). The adrenal cortex makes androgen and corticosteroid hormones.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  adrenal gland: (uh-DREE-nul...)
    Pronunciation of dictionary term "adrenal gland"
    One of a pair of small, triangle-shaped glands on top of each kidney. Each adrenal gland has two parts: the adrenal cortex (the outer layer of the adrenal gland) and the adrenal medulla (the center of the adrenal gland). The adrenal glands make steroid hormones, adrenaline, and noradrenaline. These hormones help control many important body functions, including heart rate, blood pressure, blood sugar, metabolism, and the way the body reacts to stress. The adrenal glands also make hormones that balance water and salt in the body and are involved in the development of sex characteristics. Also called suprarenal gland.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    - Pheochromocytoma and Paraganglioma Treatment
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  adrenal insufficiency: (uh-DREE-nul IN-suh-FIH-shen-see)
    Pronunciation of dictionary term "adrenal insufficiency"
    A rare disorder in which the adrenal glands do not make enough of certain hormones. Symptoms include weight loss, loss of appetite, nausea and vomiting, diarrhea, muscle weakness, fatigue, low blood sugar, low blood pressure, and patchy or dark skin. Most cases of the disorder are caused by immune system problems, but may also be caused by infection, cancer, or other diseases. Also called Addison disease.
  adrenal medulla: (uh-DREE-nul meh-DOO-luh)
    Pronunciation of dictionary term "adrenal medulla"
    The inner part of the adrenal gland (a small organ on top of each kidney). The adrenal medulla makes chemicals such as epinephrine (adrenaline) and norepinephrine (noradrenaline) which are involved in sending nerve signals.
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  adrenalectomy: (uh-DREE-nul-EK-toh-mee)
    Pronunciation of dictionary term "adrenalectomy"
    Surgery to remove one or both adrenal glands (a small organ on top of each kidney).
  adrenaline: (uh-DREH-nuh-lin)
    Pronunciation of dictionary term "adrenaline"
    A hormone and neurotransmitter. Also called epinephrine.
  adrenocortical: (uh-DREE-noh-KOR-tih-kul)
    Pronunciation of dictionary term "adrenocortical"
    Having to do with or made by the outer layer of the adrenal gland, which produces steroid hormones. There is an adrenal gland on top of each kidney.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
  adrenocortical cancer: (uh-DREE-noh-KOR-tih-kul KAN-ser)
    Pronunciation of dictionary term "adrenocortical cancer"
    A rare cancer that forms in the outer layer of tissue of the adrenal gland (a small organ on top of each kidney that makes steroid hormones, adrenaline, and noradrenaline to control heart rate, blood pressure, and other body functions). Also called adrenocortical carcinoma and cancer of the adrenal cortex.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  adrenocortical carcinoma: (uh-DREE-noh-KOR-tih-kul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "adrenocortical carcinoma"
    A rare cancer that forms in the outer layer of tissue of the adrenal gland (a small organ on top of each kidney that makes steroid hormones, adrenaline, and noradrenaline to control heart rate, blood pressure, and other body functions). Also called adrenocortical cancer and cancer of the adrenal cortex.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  adrenocorticotropic hormone: (uh-DREE-noh-KOR-tih-koh-TROH-pik HOR-mone)
    Pronunciation of dictionary term "adrenocorticotropic hormone"
    A hormone made in the pituitary gland. Adrenocorticotropic hormone acts on the outer part of the adrenal gland to control its release of corticosteroid hormones. More adrenocorticotropic hormone is made during times of stress. Also called ACTH and corticotropin.
  adrenocorticotropic-secreting tumor: (uh-DREE-noh-KOR-tih-koh-TROH-pik-seh-KREE-ting TOO-mer)
    Pronunciation of dictionary term "adrenocorticotropic-secreting tumor"
    A rare tumor that makes the hormone adrenocorticotropin (ACTH), which causes the adrenal glands to make too much cortisol. Adrenocorticotropic-secreting tumors can lead to Cushing syndrome. Signs and symptoms of adrenocorticotropic-secreting tumors and Cushing syndrome include a round face, thin arms and legs, severe fatigue and muscle weakness, high blood pressure, high blood sugar, purple or pink stretch marks on the skin, and weight gain, especially in the abdomen. Adrenocorticotropic-secreting tumors usually form in the pituitary gland or in the islet cells of the pancreas, but they may also form in other organs, including the lung, thyroid, and thymus. Adrenocorticotropic-secreting tumors may be benign (not cancer) or malignant (cancer). Also called ACTHoma.
  AdreView: (A-dreh-VYOO)
    Pronunciation of dictionary term "AdreView"
    A drug containing a form of radioactive iodine called I 123 that is used to find certain types of tumors, including pheochromocytomas and neuroblastomas. Radiation from I 123 may help show where cancer cells are in the body. AdreView is a type of radioconjugate. Also called 123I-MIBG, iobenguane I 123, and iodine I 123-metaiodobenzylguanidine.
  Adriamycin: (AY-dree-uh-MY-sin)
    Pronunciation of dictionary term "Adriamycin"
    A drug that comes from the bacterium Streptomyces peucetius and is used alone or with other drugs to treat many types of cancer, including leukemia, lymphoma, neuroblastoma, sarcoma, Wilms tumor, and certain cancers of the lung, breast, stomach, ovary, thyroid, and bladder. It is also being studied in the treatment of other types of cancer. Adriamycin damages the cell’s DNA and may kill cancer cells. It also blocks a certain enzyme needed for cell division and DNA repair. Adriamycin is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called doxorubicin hydrochloride and hydroxydaunorubicin.
    More Information
    - Doxorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
  Adriamycin PFS: (AY-dree-uh-MY-sin …)
    Pronunciation of dictionary term "Adriamycin PFS"
    A brand name for doxorubicin hydrochloride, which is used to treat many types of cancer. Adriamycin PFS brand has been taken off the market and is no longer available.
    More Information
    - Doxorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
  Adriamycin RDF: (AY-dree-uh-MY-sin …)
    Pronunciation of dictionary term "Adriamycin RDF"
    A brand name for doxorubicin hydrochloride, which is used to treat many types of cancer. Adriamycin RDF brand has been taken off the market and is no longer available.
    More Information
    - Doxorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
  Adrucil: (AD-roo-sil)
    Pronunciation of dictionary term "Adrucil"
    A drug used to treat cancers of the breast, stomach, and pancreas, and certain types of colorectal and head and neck cancers. It is also used in a cream to treat basal cell skin cancer and actinic keratosis (a skin condition that may become cancer). It is being studied in the treatment of other conditions and types of cancer. Adrucil stops cells from making DNA and it may kill cancer cells. It is a type of antimetabolite. Also called 5-fluorouracil, 5-FU, Efudex, Fluoroplex, and fluorouracil.
  Adstiladrin: (ad-STIH-luh-drin)
    Pronunciation of dictionary term "Adstiladrin"
    A drug used to treat adults with a certain type of high-risk bladder cancer that has not invaded the muscle layers of the bladder. It is used in patients whose cancer has not gotten better after treatment with Bacillus Calmette-Guérin (BCG). It is also being studied in the treatment of other types of cancer. Adstiladrin is a weakened adenovirus that carries a copy of the gene for interferon alfa-2b into bladder cancer cells. This may help the body’s immune system recognize the cancer cells and kill them. Adstiladrin is given in a solution that is placed directly into the bladder using a thin tube called a catheter. It is a type of gene therapy. Also called nadofaragene firadenovec.
    More Information
    - Nadofaragene Firadenovec-vncg (https://www.cancer.gov/about-cancer/treatment/drugs/nadofaragene-firadenovec-vncg)
  adult progeria: (uh-DULT proh-JEER-ee-uh)
    Pronunciation of dictionary term "adult progeria"
    A rare, inherited disorder marked by rapid aging that begins in early adolescence or young adulthood and an increased risk of cancer. Signs and symptoms include shorter-than-average height, thinning and graying hair, skin changes, thin arms and legs, voice changes, and unusual facial features. This disorder can also lead to health problems, such as cataracts, skin ulcers, severe hardening of the arteries, diabetes, osteoporosis, and fertility problems. People with adult progeria have an increased risk of cancer, especially thyroid cancer, skin cancer, and sarcoma (a type of bone or soft tissue cancer). Adult progeria is caused by a mutation (change) in the WRN gene, which makes a protein involved in DNA repair. Also called Werner syndrome and WS.
    More Information
    - Werner syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7885/werner-syndrome)
    - Werner syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/werner-syndrome/)
  adult rickets: (uh-DULT RIH-kets)
    Pronunciation of dictionary term "adult rickets"
    A condition in adults in which bones become soft and deformed because they don’t have enough calcium and phosphorus. It is usually caused by not having enough vitamin D in the diet, not getting enough sunlight, or a problem with the way the body uses vitamin D. Symptoms include bone pain and muscle weakness. When the condition occurs in children, it is called rickets. Also called osteomalacia.
  adult T-cell leukemia/lymphoma: (uh-DULT T-sel loo-KEE-mee-uh/lim-FOH-muh)
    Pronunciation of dictionary term "adult T-cell leukemia/lymphoma"
    An aggressive (fast-growing) type of T-cell non-Hodgkin lymphoma caused by the human T-cell leukemia virus type 1 (HTLV-1). It is marked by bone and skin lesions, high calcium levels, and enlarged lymph nodes, spleen, and liver. Also called ATLL.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  adult-type fibrosarcoma: (uh-DULT… FY-broh-sar-KOH-muh)
    Pronunciation of dictionary term "adult-type fibrosarcoma"
    A type of cancer that forms in fibrous (connective) tissue. It can occur anywhere in the body. Adult-type fibrosarcoma may spread to nearby tissue or to other parts of the body, such as the lungs or bones. It may also recur (come back) after treatment. Adult-type fibrosarcoma usually occurs in young and middle-aged adults, but it can also occur in children. It is a type of soft tissue sarcoma.
  adulterant: (uh-DUL-teh-runt)
    Pronunciation of dictionary term "adulterant"
    A substance added to a product but not listed as an ingredient, or a substance that ends up in a product by accident when the product is made. Adulterants may be in foods, drugs, and other products. An adulterant may cause a product to be harmful, cheaper to make, or not work as it should.
  advance directive: (ad-VANS duh-REK-tiv)
    Pronunciation of dictionary term "advance directive"
    A legal document that states a person’s wishes about receiving medical care if that person is no longer able to make medical decisions because of a serious illness or injury. An advance directive may also give a person (such as a spouse, relative, or friend) the authority to make medical decisions for another person when that person can no longer make decisions. There are different types of advance directives, including a living will, durable power of attorney (DPA) for health care, and do not resuscitate (DNR) orders. In the United States, the laws for advance directives may be different for each state, and each state may allow only certain types of advance directives.
    More Information
    - Advance Directives (https://www.cancer.gov/about-cancer/managing-care/advance-directives)
  advanced cancer: (ad-VANST KAN-ser)
    Pronunciation of dictionary term "advanced cancer"
    A term that is often used to describe cancer that is unlikely to be cured. However, some advanced cancers can be controlled for many years with treatment and are thought of as a chronic illness. Treatment may be given to help shrink the tumor, slow the growth of cancer cells, relieve symptoms, or help a person live longer. Advanced cancer may also be used to describe cancer that has spread from where it first started to nearby tissue, lymph nodes, or other parts of the body.
    More Information
    - Advanced Cancer (https://www.cancer.gov/about-cancer/advanced-cancer)
    - Coping with Advanced Cancer: Choices for Care Near the End of Life (https://www.cancer.gov/publications/patient-education/advanced-cancer)
  advanced practice nurse: (ad-VANST PRAK-tis ...)
    Pronunciation of dictionary term "advanced practice nurse"
    A registered nurse who has additional education and training in how to diagnose and treat disease. Advanced practice nurses are licensed at the state level and certified by national nursing organizations. In cancer care, an advanced practice nurse may manage the primary care of patients and their families, based on a practice agreement with a doctor. Also called APN, NP, and nurse practitioner.
  advanced practice provider: (ad-VANST PRAK-tis proh-VY-der)
    Pronunciation of dictionary term "advanced practice provider"
    A medical professional who is not a doctor but has special training and is licensed to diagnose, treat, and manage many common medical conditions. Advanced practice providers can perform physical exams, order laboratory tests and imaging tests, review test results, prescribe medications, perform or assist with certain procedures, such as biopsies, and make referrals to other health care providers. They may also provide information about screening tests and give counseling on living a healthy lifestyle, such as changes in diet and exercise and quitting smoking. Examples of advanced practice providers are nurse practitioners and physician assistants.
  adverse effect: (AD-vers eh-FEKT)
    Pronunciation of dictionary term "adverse effect"
    An undesired effect of a drug or other type of treatment, such as surgery. Adverse effects can range from mild to severe and can be life-threatening. Also called adverse event and adverse reaction.
  adverse event: (AD-vers eh-VENT)
    Pronunciation of dictionary term "adverse event"
    An undesired effect of a drug or other type of treatment, such as surgery. Adverse events can range from mild to severe and can be life-threatening. Also called adverse effect and adverse reaction.
  adverse reaction: (AD-vers ree-AK-shun)
    Pronunciation of dictionary term "adverse reaction"
    An undesired effect of a drug or other type of treatment, such as surgery. Adverse reactions can range from mild to severe and can be life-threatening. Also called adverse effect and adverse event.
  Advil: (AD-vil)
    Pronunciation of dictionary term "Advil"
    A drug used to treat fever, swelling, pain, and redness by preventing the body from making a substance that causes inflammation. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called ibuprofen and Motrin.
  AE-941: A substance made from shark cartilage that is being studied for its ability to prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent.
  AEE788: A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called protein tyrosine kinase inhibitors and angiogenesis inhibitors.
  AEG35156: A substance being studied in the treatment of cancer. AEG35156 may kill cancer cells by blocking the production of a protein called XIAP that helps cells live longer. It also makes cancer cells more sensitive to anticancer drugs. It is a type of antisense oligonucleotide, and a type of chemosensitizing agent. Also called GEM640.
  aerobic: (ayr-OH-bik)
    Pronunciation of dictionary term "aerobic"
    In biochemistry, reactions that need oxygen to happen or happen when oxygen is present.
  aerobic exercise: (ayr-OH-bik EK-ser-size)
    Pronunciation of dictionary term "aerobic exercise"
    Physical activity that increases the heart rate and the body’s use of oxygen. It helps improve a person’s physical fitness.
  aerobic metabolism: (ayr-OH-bik meh-TA-buh-lih-zum)
    Pronunciation of dictionary term "aerobic metabolism"
    A chemical process in which oxygen is used to make energy from carbohydrates (sugars). Also called aerobic respiration, cell respiration, and oxidative metabolism.
  aerobic respiration: (ayr-OH-bik RES-pih-RAY-shun)
    Pronunciation of dictionary term "aerobic respiration"
    A chemical process in which oxygen is used to make energy from carbohydrates (sugars). Also called aerobic metabolism, cell respiration, and oxidative metabolism.
  aerodigestive tract: (ayr-OH-dy-JES-tiv trakt)
    Pronunciation of dictionary term "aerodigestive tract"
    The combined organs and tissues of the respiratory tract and the upper part of the digestive tract (including the lips, mouth, tongue, nose, throat, vocal cords, and part of the esophagus and windpipe).
  aerosolize: (AYR-oh-sah-lize)
    Pronunciation of dictionary term "aerosolize"
    In medicine, to turn a liquid drug into a fine mist that can be inhaled.
  aesthetic flat closure: (es-THEH-tik flat KLOH-zher)
    Pronunciation of dictionary term "aesthetic flat closure"
    A type of surgery that is done to rebuild the shape of the chest wall after one or both breasts are removed. An aesthetic flat closure may also be done after removal of a breast implant that was used to restore breast shape. During an aesthetic flat closure, extra skin, fat, and other tissue in the breast area are removed. The remaining tissue is then tightened and smoothed out so that the chest wall appears flat.
  afamitresgene autoleucel: (A-fam-ih-TRES-jeen AW-toh-LOO-sel)
    Pronunciation of dictionary term "afamitresgene autoleucel"
    A treatment used for adults with synovial sarcoma that has the MAGE-A4 antigen and has spread to other parts of the body or cannot be removed by surgery. It is used in patients who have certain HLA-A*02 antigens and have received chemotherapy. It is also being studied in the treatment of other types of cancer. Afamitresgene autoleucel is made using a patient’s T cells (a type of immune system cell). A special T-cell receptor that can recognize the MAGE-A4 antigen is added to the T cells in the laboratory. These changed T cells are then grown in large numbers in the laboratory and given back to the patient by infusion. Afamitresgene autoleucel binds to the MAGE-A4 antigen, which is found on some types of cancer cells. This helps the body’s immune system kill cancer cells. Afamitresgene autoleucel is a type of cellular immunotherapy. Also called Tecelra.
    More Information
    - Afamitresgene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/afamitresgene-autoleucel)
  AFAP: A rare, inherited disorder in which multiple polyps (abnormal growths) form on the inner walls of the colon and rectum. People with AFAP usually develop fewer than 100 polyps. Benign (not cancer) tumors may also occur in the stomach, small intestine, bone, skin, and soft tissue. People with AFAP have a very high risk of developing colorectal cancer and may also be at risk of developing cancers of the stomach, small intestine, liver, and breast. AFAP is caused by mutations (changes) in the APC gene that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called attenuated familial adenomatous polyposis.
    More Information
    - Attenuated familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8532/attenuated-familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  afatinib dimaleate: (ay-FA-tih-nib dy-MAY-lee-AYT)
    Pronunciation of dictionary term "afatinib dimaleate"
    A drug used to treat certain types of non-small cell lung cancer that have spread to other parts of the body. It is used in patients whose cancer has not already been treated and has certain mutations (changes) in the EGFR gene or whose cancer got worse after treatment with platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Afatinib dimaleate blocks certain proteins made by the EGFR gene, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Afatinib dimaleate is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Gilotrif.
    More Information
    - Afatinib Dimaleate (https://www.cancer.gov/about-cancer/treatment/drugs/afatinibdimaleate)
  affected individual: (uh-FEK-ted in-dih-VIH-joo-wul)
    Pronunciation of dictionary term "affected individual"
    In genetics, a term used to describe a person who has a certain genetic trait or who shows the signs and symptoms of a certain genetic disease.
  affinity: (uh-FIH-nih-tee)
    Pronunciation of dictionary term "affinity"
    In chemistry and biology, the strength of the attaction between two substances, such as two chemicals, or an antigen and an antibody.
  affinity reagent: (uh-FIH-nih-tee ree-AY-jent)
    Pronunciation of dictionary term "affinity reagent"
    In chemistry and biology, a compound that binds specific substances, such as proteins or nucleic acids. Many affinity reagents are antibodies. They are used to analyze tissue samples to help diagnose diseases.
  afib: (AY-fib)
    Pronunciation of dictionary term "afib"
    An irregular heartbeat that occurs when the electrical signals in the atria (the two upper chambers of the heart) fire rapidly at the same time. This causes the heart to beat faster than normal. Although afib can occur without any signs or symptoms, it may sometimes cause fatigue, chest pain, heart palpitations, trouble breathing, low blood pressure, dizziness or fainting, weakness, and other signs and symptoms. Afib may be caused by certain conditions, such as high blood pressure, heart attack, coronary artery disease, abnormal heart valves, congenital heart disease, lung disease, viral infections, or an overactive thyroid gland. Previous heart surgery, stress, or exposure to caffeine, tobacco, alcohol, or certain medicines may also lead to afib. It may go away on its own or it may last for many years. If not treated, afib can lead to serious problems, such as blood clots, stroke, and heart failure. It is more common in older adults. Also called atrial fibrillation.
  Afinitor: (uh-FIH-nih-tor)
    Pronunciation of dictionary term "Afinitor"
    A drug that contains the active ingredient everolimus and is used alone or with other drugs to treat certain types of breast cancer, kidney cancer, and pancreatic, lung, and gastrointestinal neuroendocrine tumors. Afinitor is also used to treat a type of benign kidney tumor called renal angiomyolipoma and a type of benign brain tumor called subependymal giant cell astrocytoma in patients who have tuberous sclerosis. Afinitor blocks a protein involved in cell division, which may help keep abnormal cells, including cancer cells, from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Afinitor is a type of kinase inhibitor and a type of angiogenesis inhibitor.
    More Information
    - Everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
  Afinitor Disperz: (uh-FIH-nih-tor DIS-perz)
    Pronunciation of dictionary term "Afinitor Disperz"
    A drug that contains the active ingredient everolimus and is used to treat a type of benign brain tumor called subependymal giant cell astrocytoma and certain types of seizures in patients who have tuberous sclerosis. Afinitor Disperz blocks a protein involved in cell division, which may help keep abnormal cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. It may also help prevent or treat seizures in some patients. Afinitor Disperz is a type of kinase inhibitor and a type of angiogenesis inhibitor.
    More Information
    - Everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
  aflatoxin: (A-fluh-TOK-sin)
    Pronunciation of dictionary term "aflatoxin"
    A harmful substance made by certain types of mold (Aspergillus flavus and Aspergillus parasiticus) that is often found on poorly stored grains and nuts. Consumption of foods contaminated with aflatoxin is a risk factor for primary liver cancer.
    More Information
    - Aflatoxins (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/aflatoxins)
  AFLD: A condition in which fat builds up in the liver of people who drink large amounts of alcohol. AFLD can be reversed if it is diagnosed early and a person stops drinking alcohol. In some people, the condition can get worse and cause liver inflammation and damage to the cells in the liver. This may lead to cirrhosis (scarring of the liver), liver failure, or liver cancer. Also called alcoholic fatty liver disease.
    More Information
    - Fatty Liver Disease (MedlinePlus) (https://medlineplus.gov/fattyliverdisease.html)
  AFP: A protein normally produced by a fetus. AFP levels are usually undetectable in the blood of healthy adult men or women (who are not pregnant). An elevated level of AFP suggests the presence of either a primary liver cancer or germ cell tumor. Also called alpha-fetoprotein.
  AFP464: A substance being studied in the treatment of cancer. AFP464 kills cancer cells or stops them from dividing. It is a type of aminoflavone.
  AG-013736: A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called angiogenesis inhibitors and protein tyrosine kinase inhibitors.
  AG014699: A drug used to treat adults with certain types of prostate cancer or ovarian epithelial, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. AG014699 blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. AG014699 is a type of PARP inhibitor. Also called PARP-1 inhibitor AG014699, Rubraca, and rucaparib camsylate.
    More Information
    - Rucaparib Camsylate (https://www.cancer.gov/about-cancer/treatment/drugs/rucaparibcamsylate)
  AG2037: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called glycinamide ribonucleotide formyl transferase inhibitors.
  AG3340: A substance that is being studied in the treatment of cancer. It is a matrix metalloproteinase inhibitor and belongs to the family of drugs called angiogenesis inhibitors. Also called prinomastat.
  AG337: A substance that is being studied in the treatment of liver cancer. It belongs to the family of drugs called thymidylate synthase inhibitors. Also called nolatrexed and Thymitaq.
  aganglionic megacolon: (ay-GANG-glee-AH-nik MEH-guh-KOH-lun)
    Pronunciation of dictionary term "aganglionic megacolon"
    A condition in which certain nerve cells are missing from the muscle layers of part of the large intestine. This causes severe constipation or blockage of the large intestine. Constipation is when stool becomes hard, dry, and difficult to pass and bowel movements occur less often than normal. Other symptoms include swollen abdomen, vomiting, bloody diarrhea, gas, lack of energy, and trouble gaining weight. Aganglionic megacolon is present from birth, but the symptoms may not appear until later in a child’s life. This condition has been linked to an increased risk of thyroid cancer and neuroblastoma. Also called Hirschsprung disease.
    More Information
    - Hirschsprung disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6660/hirschsprungs-disease)
    - Hirschsprung disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/hirschsprung-disease/)
  AGC: A finding of abnormal cells in a Pap test. The glandular cells come from the inner part of the cervix or the lining of the uterus. This finding may be a sign of cancer or other serious condition, and more testing may be needed. Also called atypical glandular cells.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  age-adjusted rate: (ayj-uh-JUS-ted rayt)
    Pronunciation of dictionary term "age-adjusted rate"
    A statistical measure that allows groups of people to be compared in a way that the age distribution differences between the groups in a study do not affect what is being measured. For example, when comparing cancer incidence in different racial or ethnic groups, it is important to adjust for the age distribution of the people in each group. Since cancer occurs more often in older people, if one group has more older people than the other, the results without such adjustment could be misleading.
  age-related macular degeneration: (ayj-ree-LAY-ted MA-kyoo-ler dee-JEH-neh-RAY-shun)
    Pronunciation of dictionary term "age-related macular degeneration"
    A condition in which there is a slow breakdown of cells in the center of the retina (the light-sensitive layers of nerve tissue at the back of the eye). This blocks vision in the center of the eye and can cause problems with activities such as reading and driving. Age-related macular degeneration is most often seen in people who are over the age of 50. Also called AMD, ARMD, and macular degeneration.
  agent study: (AY-jent STUH-dee)
    Pronunciation of dictionary term "agent study"
    In cancer prevention, a clinical trial that studies whether taking certain medicines, vitamins, minerals, or food supplements can prevent cancer. Also called chemoprevention study.
    More Information
    - Cancer Prevention Overview
  agglutinin: (uh-GLOO-tih-nin)
    Pronunciation of dictionary term "agglutinin"
    A substance that makes particles (such as bacteria or cells) stick together to form a clump or a mass.
  aggravating factor: (A-gruh-VAY-ting FAK-ter)
    Pronunciation of dictionary term "aggravating factor"
    Something that makes a condition worse. For example, tobacco smoke is an aggravating factor for asthma.
  aggressive: (uh-GREH-siv)
    Pronunciation of dictionary term "aggressive"
    In medicine, describes a tumor or disease that forms, grows, or spreads quickly. It may also describe treatment that is more severe or intense than usual.
  aggressive fibromatosis: (uh-GREH-siv FY-broh-muh-TOH-sis)
    Pronunciation of dictionary term "aggressive fibromatosis"
    A rare type of soft tissue tumor that forms in fibrous connective tissue of the body, usually in the abdomen, head and neck, shoulders, upper arms, and thighs. Aggressive fibromatoses are intermediate tumors, meaning they can grow into and damage nearby tissue (locally aggressive) but do not spread to other parts of the body. They are painful, difficult to completely remove with surgery, and often come back after surgery. Aggressive fibromatoses occur in adults and children. Also called desmoid tumor and desmoid-type fibromatosis.
    More Information
    - Desmoid Tumor (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/desmoid-tumor)
    - Tumor desmoide (https://www.cancer.gov/pediatric-adult-rare-tumor/espanol/tumores-raros/tumores-raros-tejidos-blandos/tumor-desmoide)
  aggressive lymphoma: (uh-GREH-siv lim-FOH-muh)
    Pronunciation of dictionary term "aggressive lymphoma"
    A type of lymphoma that grows and spreads quickly and has severe symptoms. Also called high-grade lymphoma and intermediate-grade lymphoma.
  aggressive systemic mastocytosis: (uh-GREH-siv sis-TEH-mik MAS-toh-sy-TOH-sis)
    Pronunciation of dictionary term "aggressive systemic mastocytosis"
    A rare condition in which too many mast cells (a type of white blood cell) build up in certain tissues and organs in the body, including the bone marrow, lymph nodes, bone, liver, spleen, and small intestine. Aggressive systemic mastocytosis may get worse quickly and cause severe symptoms and organ damage. Sometimes, it may become mast cell leukemia (a very rare type of leukemia). Aggressive systemic mastocytosis usually occurs in adults. Also called ASM.
  agitation: (A-jih-TAY-shun)
    Pronunciation of dictionary term "agitation"
    A condition in which a person is unable to relax and be still. The person may be very tense and irritable, and become easily annoyed by small things. He or she may be eager to have an argument, and be unwilling to work with caregivers to make the situation better.
  agnogenic myeloid metaplasia: (ag-noh-JEH-nik MY-eh-loyd meh-tuh-PLAY-zhuh)
    Pronunciation of dictionary term "agnogenic myeloid metaplasia"
    A progressive, chronic disease in which the bone marrow is replaced by fibrous tissue and blood is made in organs such as the liver and the spleen, instead of in the bone marrow. This disease is marked by an enlarged spleen and progressive anemia. Also called chronic idiopathic myelofibrosis, idiopathic myelofibrosis, myelosclerosis with myeloid metaplasia, and primary myelofibrosis.
  agonist: (A-guh-nist)
    Pronunciation of dictionary term "agonist"
    A drug or substance that binds to a receptor inside a cell or on its surface and causes the same action as the substance that normally binds to the receptor.
  agoraphobia: (A-gor-uh-FOH-bee-uh)
    Pronunciation of dictionary term "agoraphobia"
    An intense fear of being in open places or in situations where it may be hard to escape, or where help may not be available. People with agoraphobia are usually very anxious about having a panic attack in a public place. They may also have a fear of being alone or have trouble leaving their home. They usually avoid elevators, bridges, and public places. Agoraphobia is a type of phobia and a type of anxiety disorder.
  agranulocyte: (ay-GRAN-yoo-loh-SITE)
    Pronunciation of dictionary term "agranulocyte"
    A type of white blood cell. Monocytes and lymphocytes are agranulocytes.
  agranulocytosis: (ay-GRAN-yoo-loh-sy-TOH-sis)
    Pronunciation of dictionary term "agranulocytosis"
    A serious condition that occurs when there is an extremely low number of granulocytes (a type of white blood cell) in the blood. Granulocytes are an important part of the immune system and help the body fight infection. Having very low levels of granulocytes in the blood can lead to serious or life-threatening infections. Signs and symptoms of agranulocytosis include fever, chills, weakness, sore throat, sores in the mouth or throat, bleeding gums, bone pain, low blood pressure, fast heartbeat, and trouble breathing. Agranulocytosis may be inherited or caused by certain autoimmune or bone marrow disorders, infection, poor nutrition, cancer treatment (such as chemotherapy or bone marrow transplant), or exposure to certain toxins, chemicals, or medicines.
  AGUS: A term that has been used to describe abnormal cells that come from glands in the walls of the cervix (the lower, narrow end of the uterus). These abnormal cells are found in a small number of Pap smears (a procedure used to detect cervical cancer) and may be a sign of more serious lesions or cancer. The term used now is atypical glandular cells. Also called atypical glandular cells of uncertain significance and atypical glandular cells of undetermined significance.
  AHA: One of a group of substances that are found in several types of fruit and in milk. They are used in skin care products to reduce wrinkles and soften the skin. Examples of AHAs are glycolic acid, lactic acid, and citric acid. Also called alpha hydroxyl acid and fruit acid.
  AI: The ability of a computer to perform functions that are usually thought of as intelligent human behavior, such as learning, reasoning, problem solving, and decision making. AI uses computer programs that analyze very large amounts of information to learn how to help make decisions or predictions. In medicine, the use of AI may help improve cancer screening and diagnosis and plan treatment. It may also be used in research and in drug discovery and development. Also called artificial intelligence.
  AI drug: (... drug)
    Pronunciation of dictionary term "AI drug"
    A drug that blocks the activity of an enzyme called aromatase, which the body uses to make estrogen in the ovaries and other tissues. Blocking aromatase lowers the amount of estrogen made by the body, which may stop the growth of cancer cells that need estrogen to grow. AI drugs are used to treat some types of breast cancer or to keep it from coming back. They may also be used to help prevent breast cancer in some women who are at a high risk of developing it. Examples of AI drugs are anastrozole, letrozole, and exemestane. AI drugs are a type of hormone therapy. Also called aromatase inhibitor.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  Aicardi syndrome: (ay-KAR-dee SIN-drome)
    Pronunciation of dictionary term "Aicardi syndrome"
    A rare, genetic disorder marked by a lack of tissue connecting the left and right halves of the brain, seizures, lesions on the back of the eye (retina), and other brain and eye abnormalities. Other problems may include unusual facial features, defects of the hands, spine, and ribs, and developmental and gastrointestinal problems. When Aicardi syndrome occurs, it is almost always in a newborn girl. People with Aicardi syndrome have an increased risk of certain tumors, such as hepatoblastoma (a type of liver cancer) and choroid plexus tumors (a rare tumor that forms in the brain).
    More Information
    - Aicardi syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5764/aicardi-syndrome)
    - Aicardi syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/aicardi-syndrome/)
  AIDS: A disease caused by the human immunodeficiency virus (HIV). People with AIDS are at an increased risk for developing certain cancers and for infections that usually occur only in individuals with a weak immune system. Also called acquired immunodeficiency syndrome.
  AIDS-defining cancer: (… deh-FY-ning KAN-ser)
    Pronunciation of dictionary term "AIDS-defining cancer"
    A type of cancer that a person infected with human immunodeficiency virus (HIV) is at high risk of developing. If a person with HIV develops one of these cancers, it means they have AIDS. AIDS-defining cancers include Kaposi sarcoma, certain types of non-Hodgkin lymphoma, and cervical cancer.
    More Information
    - HIV Infection and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hiv-fact-sheet)
  AIDS-related cancer: (… ree-LAY-ted KAN-ser)
    Pronunciation of dictionary term "AIDS-related cancer"
    A type of cancer that is more likely to occur in people who are infected with the human immunodeficiency virus (HIV). AIDS-related cancers include Kaposi sarcoma, non-Hodgkin lymphoma, cervical cancer, Hodgkin lymphoma, and cancers of the mouth, throat, liver, lung, and anus.
    More Information
    - HIV Infection and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hiv-fact-sheet)
  AIS: A condition in which abnormal cells are found in the glandular tissue, which lines certain internal organs and makes and releases substances in the body, such as mucus, digestive juices, and other fluids. These abnormal cells may become cancer and spread into nearby normal tissue. AIS occurs most often in the cervix and lung. Also called adenocarcinoma in situ.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  AJCC staging system: (... STAY-jing SIS-tem)
    Pronunciation of dictionary term "AJCC staging system"
    A system to describe the amount and spread of cancer in a patient’s body, using TNM. T describes the size of the tumor and any spread of cancer into nearby tissue; N describes spread of cancer to nearby lymph nodes; and M describes metastasis (spread of cancer to other parts of the body). This system was created and is updated by the American Joint Committee on Cancer (AJCC) and the International Union Against Cancer (UICC). The AJCC staging system is used to describe most types of cancer. Also called TNM staging system.
    More Information
    - Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
  Akeega: (uh-KEE-guh)
    Pronunciation of dictionary term "Akeega"
    A combination of niraparib tosylate monohydrate and abiraterone acetate used with prednisone to treat adults with prostate cancer that has spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). It is used in patients who have a certain type of abnormal BRCA gene. Niraparib tosylate monohydrate blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Abiraterone acetate lowers the amount of androgens (male hormones), such as testosterone, made by the body. This may stop the growth of cancer cells that need androgens to grow. The combination of niraparib tosylate monohydrate and abiraterone acetate may work better than either drug alone. Akeega is a type of PARP inhibitor and a type of antiandrogen. Also called niraparib tosylate monohydrate and abiraterone acetate.
    More Information
    - Niraparib Tosylate Monohydrate and Abiraterone Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/niraparib-tosylate-monohydrate-and-abiraterone-acetate)
  Akt: A group of enzymes involved in several processes related to cell growth and survival. Akt enzymes help to transfer signals inside cells. An Akt enzyme is a type of serine/threonine protein kinase. Also called protein kinase B.
  Akynzeo: (ay-KIN-zee-oh)
    Pronunciation of dictionary term "Akynzeo"
    A combination of two drugs used with dexamethasone in adults to prevent nausea and vomiting caused by chemotherapy. Akynzeo blocks the action of certain chemicals in the central nervous system that may trigger nausea and vomiting. Blocking these chemicals may help lessen nausea and vomiting. Akynzeo is a type of antiemetic. Also called netupitant and palonosetron hydrochloride.
    More Information
    - Netupitant and Palonosetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/netupitant-palonosetronhydrochloride)
  Alagille syndrome: (a-luh-JEEL SIN-drome)
    Pronunciation of dictionary term "Alagille syndrome"
    A rare disorder in which there are defects in the small tubes that carry bile (fluid that helps digest fat) out of the liver. These small tubes may be narrow or have an abnormal shape, or there may be fewer of them than normal. This can cause bile to build up in the liver, which may lead to cirrhosis (scarring of the liver) and liver damage. Alagille syndrome can also affect other parts of the body, including the heart, kidneys, blood vessels, eyes, face, and spine. It usually occurs in infants and children and may be inherited.
    More Information
    - Alagille syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/804/alagille-syndrome)
    - Alagille syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/alagille-syndrome/)
  alanine aminopeptidase: (A-luh-neen uh-MEE-noh-PEP-tih-days)
    Pronunciation of dictionary term "alanine aminopeptidase"
    An enzyme that is normally found in healthy kidneys. It may be found at high levels in the urine when there are kidney problems. It is used as a biomarker to detect damage to the kidneys caused by drugs and other agents. It may also be used to diagnose certain kidney and liver disorders. Also called AAP.
  alanine transferase: (A-luh-neen TRANZ-feh-rays)
    Pronunciation of dictionary term "alanine transferase"
    An enzyme found in the liver and other tissues. A high level of alanine transferase released into the blood may be a sign of liver damage, cancer, or other diseases. Also called serum glutamate pyruvate transaminase and SGPT.
  alanosine: (uh-LAN-oh-seen)
    Pronunciation of dictionary term "alanosine"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called antimetabolites. Also called SDX-102.
  albinism: (AL-bih-NIH-zum)
    Pronunciation of dictionary term "albinism"
    A group of genetic conditions marked by little or none of the pigment melanin in the skin, hair, and/or eyes. People with albinism may have vision problems and white or yellow hair; reddish, violet, blue or brown eyes; and pale skin.
  albumin: (al-BYOO-min)
    Pronunciation of dictionary term "albumin"
    A type of protein found in blood, egg white, milk, and other substances.
  ALCAR: (ALL-kar)
    Pronunciation of dictionary term "ALCAR"
    A form of the natural substance carnitine that is being studied as a way to prevent tissue damage caused by chemotherapy. Carnitine is made in muscle and liver tissue and is found in certain foods, such as meat, poultry, fish, and some dairy products. It is used by many cells in the body to make energy from fat. Also called acetyl-L-carnitine and acetyl-L-carnitine hydrochloride.
  ALCL: An aggressive (fast-growing) type of non-Hodgkin lymphoma that is usually of the T-cell type. The cancer cells express a marker called CD30 or Ki-1 on the surface, and may appear in the lymph nodes, skin, bones, soft tissues, lungs, or liver. Also called anaplastic large cell lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  alcohol: (AL-kuh-hol)
    Pronunciation of dictionary term "alcohol"
    A chemical substance found in drinks such as beer, wine, and liquor. It is also found in some medicines, mouthwashes, household products, and essential oils (scented liquid taken from certain plants). It is made by a chemical process called fermentation that uses sugars and yeast. There are different types of alcohol. The type used to make alcoholic drinks is called ethyl alcohol (ethanol). Drinking regular or large amounts of alcohol may increase the risk of certain types of cancer, such as cancer of the mouth, throat, esophagus, breast, liver, colon, and rectum.
    More Information
    - Alcohol and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/alcohol/alcohol-fact-sheet)
  alcohol ablation: (AL-kuh-hol a-BLAY-shun)
    Pronunciation of dictionary term "alcohol ablation"
    An injection of ethanol (alcohol) through the skin directly into a tumor to kill cancer cells. Ultrasound or a CT scan is used to guide the needle into the tumor. Also called ethanol ablation, PEI, and percutaneous ethanol injection.
  alcohol dependence: (AL-kuh-hol dee-PEN-dents)
    Pronunciation of dictionary term "alcohol dependence"
    A chronic disease in which a person craves drinks that contain alcohol and is unable to control his or her drinking. A person with this disease also needs to drink greater amounts to get the same effect and has withdrawal symptoms after stopping alcohol use. Alcohol dependence affects physical and mental health, and can cause problems with family, friends, and work. Regular heavy alcohol intake increases the risk of several types of cancer. Also called alcoholism.
    More Information
    - Alcohol and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/alcohol/alcohol-fact-sheet)
  alcoholic fatty liver disease: (AL-kuh-HAW-lik FA-tee LIH-ver dih-ZEEZ)
    Pronunciation of dictionary term "alcoholic fatty liver disease"
    A condition in which fat builds up in the liver of people who drink large amounts of alcohol. Alcoholic fatty liver disease can be reversed if it is diagnosed early and a person stops drinking alcohol. In some people, the condition can get worse and cause liver inflammation and damage to the cells in the liver. This may lead to cirrhosis (scarring of the liver), liver failure, or liver cancer. Also called AFLD.
    More Information
    - Fatty Liver Disease (MedlinePlus) (https://medlineplus.gov/fattyliverdisease.html)
  alcoholism: (AL-kuh-HAW-LIH-zum)
    Pronunciation of dictionary term "alcoholism"
    A chronic disease in which a person craves drinks that contain alcohol and is unable to control his or her drinking. A person with this disease also needs to drink greater amounts to get the same effect and has withdrawal symptoms after stopping alcohol use. Alcoholism affects physical and mental health, and can cause problems with family, friends, and work. Regular heavy alcohol intake increases the risk of several types of cancer. Also called alcohol dependence.
    More Information
    - Alcohol and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/alcohol/alcohol-fact-sheet)
  Aldara: (al-DAR-uh)
    Pronunciation of dictionary term "Aldara"
    A drug that contains the active ingredient imiquimod and is used to treat certain skin conditions. Aldara is used to treat superficial basal cell skin cancer and actinic keratosis (a skin condition that may become cancer) in adults who have a normal immune system. It is also used to treat genital warts or perianal warts in adults and in children aged 12 years or older. Aldara may help the immune system kill abnormal cells, including cancer cells. It is a type of immunomodulating agent.
    More Information
    - Imiquimod (https://www.cancer.gov/about-cancer/treatment/drugs/imiquimod)
  aldehyde: (AL-deh-hide)
    Pronunciation of dictionary term "aldehyde"
    A type of chemical substance made from alcohol. Aldehydes are found in essential oils (scented liquid taken from plants).
  aldesleukin: (AL-des-LOO-kin)
    Pronunciation of dictionary term "aldesleukin"
    A drug used to treat adults with melanoma or renal cell carcinoma (a type of kidney cancer) that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Aldesleukin is a form of interleukin-2 that is made in the laboratory. Aldesleukin increases the activity and growth of white blood cells called T lymphocytes and B lymphocytes, which may help the immune system kill cancer cells. Aldesleukin is a type of cytokine and a type of immunomodulating agent. Also called Proleukin and recombinant human interleukin-2.
    More Information
    - Aldesleukin (https://www.cancer.gov/about-cancer/treatment/drugs/aldesleukin)
  aldosterone: (al-DOS-teh-rone)
    Pronunciation of dictionary term "aldosterone"
    A steroid hormone made by the adrenal cortex (the outer layer of the adrenal gland). It helps control the balance of water and salts in the kidney by keeping sodium in and releasing potassium from the body. Too much aldosterone can cause high blood pressure and a build-up of fluid in body tissues. Aldosterone is a type of mineralocorticoid hormone.
  Aldrich syndrome: (ALL-drich SIN-drome)
    Pronunciation of dictionary term "Aldrich syndrome"
    An inherited immune disorder that occurs in young boys. It causes eczema (a type of skin inflammation), a decrease in the number of platelets (blood cells that help prevent bleeding), and frequent bacterial infections. People with Aldrich syndrome are at increased risk of developing leukemia and lymphoma. Also called Wiskott-Aldrich syndrome.
    More Information
    - Wiskott Aldrich syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7895/wiskott-aldrich-syndrome)
    - Wiskott-Aldrich syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/wiskott-aldrich-syndrome/)
  Alecensa: (A-leh-SEN-suh)
    Pronunciation of dictionary term "Alecensa"
    A drug used to treat adults with certain types of non-small cell lung cancer that are ALK positive. It used in patients whose cancer has spread to other parts of the body. It is also used to help keep cancer from coming back in patients whose cancer was removed by surgery. Alecensa is also being studied in the treatment of other types of cancer. Alecensa blocks certain proteins made by the ALK gene, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called alectinib.
    More Information
    - Alectinib (https://www.cancer.gov/about-cancer/treatment/drugs/alectinib)
  alectinib: (uh-LEK-tih-nib)
    Pronunciation of dictionary term "alectinib"
    A drug used to treat adults with certain types of non-small cell lung cancer that are ALK positive. It used in patients whose cancer has spread to other parts of the body. It is also used to help keep cancer from coming back in patients whose cancer was removed by surgery. Alectinib is also being studied in the treatment of other types of cancer. Alectinib blocks certain proteins made by the ALK gene, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Alecensa.
    More Information
    - Alectinib (https://www.cancer.gov/about-cancer/treatment/drugs/alectinib)
  alefacept: (uh-LEH-fuh-sept)
    Pronunciation of dictionary term "alefacept"
    A drug that is used to treat certain skin conditions and is being studied in the treatment of cutaneous (skin-related) T-cell cancer and T-cell non-Hodgkin lymphoma. Alefacept is made by combining part of an antibody with a protein that blocks the growth some types of T cells. It is a type of fusion protein and a type of immunosuppressant. Also called Amevive.
  alemtuzumab: (A-lem-TOO-zoo-mab)
    Pronunciation of dictionary term "alemtuzumab"
    A drug used to treat B-cell chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. Alemtuzumab binds to a protein called CD52, which is found on some types of immune cells and cancer cells. This may help the immune system kill cancer cells. Alemtuzumab is a type of monoclonal antibody. Also called Campath.
    More Information
    - Alemtuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/alemtuzumab)
  alendronate sodium: (uh-LEN-droh-nayt SOH-dee-um)
    Pronunciation of dictionary term "alendronate sodium"
    A drug used to treat certain bone conditions, such as osteoporosis and Paget disease of the bone. It is also being studied in the treatment of hypercalcemia (high levels of calcium in the blood) and bone pain caused by cancer. Alendronate sodium slows the breakdown of bone and prevents the loss of calcium. It is a type of bisphosphonate. Also called Fosamax.
  ALH: A benign (not cancer) condition in which there are more cells than normal in the breast lobules and the cells look abnormal under a microscope. Having ALH increases the risk of breast cancer. Also called atypical lobular breast hyperplasia and atypical lobular hyperplasia.
  alimentary tract: (A-lih-MEN-tuh-ree trakt)
    Pronunciation of dictionary term "alimentary tract"
    The organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. The alimentary tract is part of the digestive system. Also called digestive tract and gastrointestinal tract.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
    Anatomy of the digestive tract. The digestive tract is made up of organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.
    Anatomy of the digestive tract; drawing shows the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.
  Alimta: (uh-LIM-tuh)
    Pronunciation of dictionary term "Alimta"
    A drug used alone or with other drugs to treat certain types of non-small cell lung cancer and malignant pleural mesothelioma. It is also being studied in the treatment of other types of cancer. Alimta stops cells from using folic acid to make DNA and may kill cancer cells. It is a type of antimetabolite and a type of antifolate. Also called LY231514, pemetrexed disodium, and Pemfexy.
    More Information
    - Pemetrexed Disodium (https://www.cancer.gov/about-cancer/treatment/drugs/pemetrexeddisodium)
  Aliqopa: (A-lih-KOH-puh)
    Pronunciation of dictionary term "Aliqopa"
    A drug used to treat adults with follicular lymphoma that came back after treatment with at least two other systemic therapies. It is also being studied in the treatment of other types of cancer. Aliqopa blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor.
    More Information
    - Copanlisib Hydrochloride
  alisertib sodium: (A-lih-SER-tib SOH-dee-um)
    Pronunciation of dictionary term "alisertib sodium"
    A substance that binds to a protein called Aurora A kinase and blocks its activity. Aurora A kinase plays an important role in cell division and may be found on some cancer cells. Blocking this protein may help keep cancer cells from growing and may kill them. Alisertib sodium is being studied in the treatment of some types of cancer. It is a type of protein kinase inhibitor.
  ALK gene: (… jeen)
    Pronunciation of dictionary term "ALK gene"
    A gene that makes a protein that is involved in cell growth. Mutated (changed) forms of the ALK gene and protein have been found in some types of cancer, including neuroblastoma, non-small cell lung cancer, and anaplastic large cell lymphoma. These changes may increase the growth of cancer cells. Checking for changes in the ALK gene in tumor tissue may help to plan cancer treatment. Also called anaplastic lymphoma kinase gene.
  ALK inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "ALK inhibitor"
    A substance that blocks the activity of a protein called anaplastic lymphoma kinase (ALK), which helps control cell growth. Blocking this protein may help keep cancer cells from growing and spreading. Some ALK inhibitors are used to treat cancer. They are a type of targeted therapy. Also called anaplastic lymphoma kinase inhibitor.
  ALK positive: (… PAH-zih-tiv)
    Pronunciation of dictionary term "ALK positive"
    Describes cells that have a protein called ALK on their surface. In cancer, it is also used to describe cells that have a change in the structure of the ALK gene or that make too much ALK protein. In normal cells, ALK helps control cell growth. Cancer cells that have the changed ALK gene or make too much ALK protein may grow more quickly. Knowing whether a cancer is ALK positive may help plan treatment. Cancers that may be ALK positive include neuroblastoma, non-small cell lung cancer, and anaplastic large cell lymphoma. Also called anaplastic lymphoma kinase positive.
  alkali: (AL-kuh-ly)
    Pronunciation of dictionary term "alkali"
    A chemical that can dissolve in water, combine with acids to form salts, and make acids less acidic. Alkalis have a bitter taste and turn certain dyes blue. Some alkalis can help the body work the way it should. An example of an alkali is sodium hydroxide.
  alkaline diet: (AL-kuh-line DY-et)
    Pronunciation of dictionary term "alkaline diet"
    A dietary approach that aims to reduce acidity within the body. The diet focuses on eating foods considered alkaline (with a pH above 7) and avoiding foods considered acidic (with a pH below 7). Examples of alkaline foods include fresh fruits, nuts, seeds, beans, and non-starchy vegetables. Examples of acidic foods include meat, cheese, eggs, grains, and processed foods. There is no proof that an alkaline diet can slow, cure, or keep diseases such as cancer from coming back.
  alkalinity: (AL-kuh-lih-nih-tee)
    Pronunciation of dictionary term "alkalinity"
    Refers to the amount of alkali. An alkali is a chemical that can dissolve in water, combine with acids to form salts, and make acids less acidic.
  alkalinization: (AL-kuh-LIH-nih-ZAY-shun)
    Pronunciation of dictionary term "alkalinization"
    A process that lowers the amount of acid in a solution. In medicine, an alkali, such as sodium bicarbonate, may be given to patients to lower high levels of acid in the blood or urine that can be caused by certain medicines or conditions.
  alkaloid: (AL-kuh-loyd)
    Pronunciation of dictionary term "alkaloid"
    A member of a large group of substances found in plants and in some fungi. Alkaloids contain nitrogen and can be made in the laboratory. Nicotine, caffeine, codeine, and vincristine are alkaloids. Some alkaloids, such as vincristine, are used to treat cancer.
  Alkeran for Injection: (AL-keh-ran ... in-JEK-shun)
    Pronunciation of dictionary term "Alkeran for Injection"
    A drug used to treat multiple myeloma in patients who cannot take melphalan by mouth and to prepare patients with multiple myeloma for a stem cell transplant. It is also being studied in the treatment of other types of cancer. Alkeran for Injection may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called Evomela and melphalan hydrochloride.
    More Information
    - Melphalan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalan-hydrochloride)
  Alkeran Tablets: (AL-keh-ran TA-blets)
    Pronunciation of dictionary term "Alkeran Tablets"
    A drug used to treat multiple myeloma and ovarian epithelial cancer that cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Alkeran Tablets may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called melphalan.
    More Information
    - Melphalan (https://www.cancer.gov/about-cancer/treatment/drugs/melphalan)
  alkylating agent: (AL-kuh-LAY-ting AY-jent)
    Pronunciation of dictionary term "alkylating agent"
    A type of drug that is used in the treatment of cancer. It interferes with the cell's DNA and inhibits cancer cell growth.
  ALL: A type of leukemia (blood cancer) that comes on quickly and is fast growing. In ALL, there are too many lymphoblasts (immature white blood cells) in the blood and bone marrow. Also called acute lymphoblastic leukemia and acute lymphocytic leukemia.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  all-cause mortality: (… kawz mor-TA-lih-tee)
    Pronunciation of dictionary term "all-cause mortality"
    A term that refers to death from any cause. In statistics, all-cause mortality is usually a measure of the total number of deaths from any cause in a specific group of people over a specific period of time. For example, all-cause mortality may be reported for people who live in one area of the country or who are of a specific gender, age, race, or ethnic group.
  all-trans retinoic acid: (all-tranz REH-tih-NOH-ik A-sid)
    Pronunciation of dictionary term "all-trans retinoic acid"
    A nutrient that the body needs in small amounts to function and stay healthy. All-trans retinoic acid is made in the body from vitamin A and helps cells to grow and develop, especially in the embryo. A form of all-trans retinoic acid made in the laboratory is put on the skin to treat conditions such as acne and is taken by mouth to treat acute promyelocytic leukemia (a fast-growing cancer in which there are too many immature blood-forming cells in the blood and bone marrow). All-trans retinoic acid is being studied in the prevention and treatment of other types of cancer. Also called ATRA, retinoic acid, tretinoin, and vitamin A acid.
  Allegra: (uh-LEH-gruh)
    Pronunciation of dictionary term "Allegra"
    A drug used to treat certain allergy symptoms. It blocks a chemical released during an allergic response that causes itching, sneezing, runny nose, wheezing, and watery eyes. It is a type of antihistamine. Also called fexofenadine.
  allele: (uh-LEEL)
    Pronunciation of dictionary term "allele"
    One of two or more alternative versions of a gene. A person inherits two alleles for each gene, one from the mother and one from the father. These two alleles may be the same or different. The alleles a person inherits help determine certain traits or characteristics, such as hair, skin, and eye color, height, and blood type. In some cases, one or both alleles may be mutated (changed from the original, normal version), which may cause disease.
    More Information
    - Allele (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=4)
  allelic heterogeneity: (uh-LEE-lik HEH-teh-roh-jeh-NEE-ih-tee)
    Pronunciation of dictionary term "allelic heterogeneity"
    A term that describes when different mutations (changes) in a single gene cause the same disease or condition. Each mutation by itself is enough to cause the disease or condition. For example, cystic fibrosis (an inherited disorder that affects the lungs and digestive system) is caused by having one of many different mutations in the CFTR gene.
  allergen: (A-ler-jen)
    Pronunciation of dictionary term "allergen"
    A substance that causes an allergic response. Examples include pollen, molds, and certain foods.
  allergic response: (uh-LER-jik reh-SPONTS)
    Pronunciation of dictionary term "allergic response"
    A hypersensitive immune reaction to a substance that normally is harmless or would not cause an immune response in most people. An allergic response may cause harmful symptoms such as itching or inflammation or tissue injury.
  allogeneic: (A-loh-jeh-NAY-ik)
    Pronunciation of dictionary term "allogeneic"
    Taken from different individuals of the same species. Also called allogenic.
  allogeneic bone marrow transplant: (A-loh-jeh-NAY-ik bone MAYR-oh TRANZ-plant)
    Pronunciation of dictionary term "allogeneic bone marrow transplant"
    A procedure in which a patient receives healthy stem cells (blood-forming cells) from a donor to replace their own stem cells that have been destroyed by treatment with radiation or high doses of chemotherapy. In an allogeneic bone marrow transplant, the healthy stem cells come from the bone marrow of a related donor who is not an identical twin of the patient or from an unrelated donor who is genetically similar to the patient.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  allogeneic stem cell transplant: (A-loh-jeh-NAY-ik stem sel TRANZ-plant)
    Pronunciation of dictionary term "allogeneic stem cell transplant"
    A procedure in which a patient receives healthy blood-forming cells (stem cells) from a donor to replace their own stem cells that have been destroyed by treatment with radiation or high doses of chemotherapy. In an allogeneic stem cell transplant, the healthy stem cells may come from the blood or bone marrow of a related donor who is not an identical twin of the patient or from an unrelated donor who is genetically similar to the patient. An allogeneic stem cell transplant is most often used to treat blood cancers, such as leukemia and lymphoma, and certain types of blood or immune system disorders.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
    Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.
    Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.
  allogenic: (A-loh-JEH-nik)
    Pronunciation of dictionary term "allogenic"
    Taken from different individuals of the same species. Also called allogeneic.
  allograft: (A-loh-graft)
    Pronunciation of dictionary term "allograft"
    The transplant of an organ, tissue, or cells from one individual to another individual of the same species who is not an identical twin.
  allopathic medicine: (A-loh-PA-thik MEH-dih-sin)
    Pronunciation of dictionary term "allopathic medicine"
    A system in which medical doctors and other health care professionals (such as nurses, pharmacists, and therapists) treat symptoms and diseases using drugs, radiation, or surgery. Also called biomedicine, conventional medicine, mainstream medicine, orthodox medicine, and Western medicine.
  allopurinol: (a-loh-PYOOR-rih-nol)
    Pronunciation of dictionary term "allopurinol"
    A drug that lowers high levels of uric acid (a byproduct of metabolism) in the blood caused by some cancer treatments.
  Allovectin-7: (A-loh-VEK-tin ...)
    Pronunciation of dictionary term "Allovectin-7"
    A substance that is being studied as a gene therapy agent in the treatment of cancer. It increases the ability of the immune system to recognize cancer cells and kill them.
  aloe-emodin: (A-loh-EH-muh-din)
    Pronunciation of dictionary term "aloe-emodin"
    A substance found in certain plants, including aloe vera. It belongs to a family of compounds called anthraquinones, which have shown anti-inflammatory and anticancer effects.
  alopecia: (A-loh-PEE-shuh)
    Pronunciation of dictionary term "alopecia"
    The lack or loss of hair from areas of the body where hair is usually found. Alopecia can be a side effect of some cancer treatments.
    More Information
    - Hair Loss (Alopecia) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/hair-loss)
  Aloxi: (uh-LOK-see)
    Pronunciation of dictionary term "Aloxi"
    A drug used in adults and children aged 1 month and older to prevent nausea and vomiting caused by chemotherapy and nausea and vomiting after surgery. Aloxi blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Aloxi is a type of antiemetic and a type of serotonin receptor antagonist. Also called palonosetron hydrochloride.
    More Information
    - Palonosetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/palonosetronhydrochloride)
  alpelisib: (AL-peh-LIH-sib)
    Pronunciation of dictionary term "alpelisib"
    A drug used with fulvestrant to treat postmenopausal women, and men, with hormone-receptor positive, HER2-negative breast cancer that is advanced or has spread and has a mutation (change) in the PIK3CA gene. It is used in patients whose cancer got worse during or after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. Alpelisib blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called Piqray.
    More Information
    - Alpelisib (https://www.cancer.gov/about-cancer/treatment/drugs/alpelisib)
  alpha emitter radiation therapy: (AL-fuh ee-MIH-ter RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "alpha emitter radiation therapy"
    Therapy that uses a radioactive substance that gives off a type of high-energy radiation called an alpha-particle to kill cancer cells. The radioactive substance is injected into a vein, travels through the blood, and collects in certain tissues in the body, such as areas of bone with cancer. This type of radiation may cause less damage to nearby healthy tissue. Alpha emitter radiation therapy is used to treat prostate cancer that has spread to the bone, and it is being studied in the treatment of other types of cancer.
  alpha hydroxyl acid: (AL-fuh hy-DROK-sil A-sid)
    Pronunciation of dictionary term "alpha hydroxyl acid"
    One of a group of substances that are found in several types of fruit and in milk. They are used in skin care products to reduce wrinkles and soften the skin. Examples of alpha hydroxyl acids are glycolic acid, lactic acid, and citric acid. Also called AHA and fruit acid.
  alpha-1 antitrypsin deficiency: (AL-fuh … AN-tee-TRIP-sin deh-FIH-shun-see)
    Pronunciation of dictionary term "alpha-1 antitrypsin deficiency"
    An inherited condition in which the body either does not make enough of a protein called alpha-1 antitrypsin (AAT) or makes an abnormal form of AAT. AAT is made in the liver and helps protect the body’s organs, especially the liver and lungs, from damage. Alpha-1 antitrypsin deficiency can lead to serious lung conditions (including emphysema and bronchiectasis) and liver conditions (including cirrhosis, hepatitis, and liver cancer). It may also cause inflammation of the blood vessels and a rare skin condition that causes painful lumps on or under the skin. Lung problems caused by alpha-1 antitrypsin deficiency almost always occur in adults, but liver and skin problems may occur in both adults and children. Alpha-1 antitrypsin deficiency is caused by a mutation (change) in a gene called SERPINA1. Also called AAT deficiency.
    More Information
    - Alpha-1 antitrypsin deficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5784/alpha-1-antitrypsin-deficiency)
    - Alpha-1 antitrypsin deficiency (MedlinePlus) (https://medlineplus.gov/genetics/condition/alpha-1-antitrypsin-deficiency/)
  alpha-adrenergic antagonist: (AL-fuh-A-dreh-NER-jik an-TA-guh-nist)
    Pronunciation of dictionary term "alpha-adrenergic antagonist"
    A substance that relaxes muscle tissue in blood vessels and in the prostate gland, which improves the flow of urine and blood. Alpha-adrenergic antagonists are used to treat the symptoms of many conditions, such as benign prostatic hyperplasia (BPH), high blood pressure, and some blood circulation problems. Also called alpha-blocker.
  alpha-blocker: (AL-fuh-BLAH-ker)
    Pronunciation of dictionary term "alpha-blocker"
    A substance that relaxes muscle tissue in blood vessels and in the prostate gland, which improves the flow of urine and blood. Alpha-blockers are used to treat the symptoms of many conditions, such as benign prostatic hyperplasia (BPH), high blood pressure, and some blood circulation problems. Also called alpha-adrenergic antagonist.
  alpha-fetoprotein: (AL-fuh-FEE-toh-PROH-teen)
    Pronunciation of dictionary term "alpha-fetoprotein"
    A protein normally produced by a fetus. Alpha-fetoprotein levels are usually undetectable in the blood of healthy adult men or women (who are not pregnant). An elevated level of alpha-fetoprotein suggests the presence of either a primary liver cancer or germ cell tumor. Also called AFP.
  alpha-lipoic acid: (AL-fuh-lih-POH-ik A-sid)
    Pronunciation of dictionary term "alpha-lipoic acid"
    A substance that is being studied for its ability to protect normal cells from the side effects of chemotherapy and prevent peripheral neuropathy (numbness, tingling, burning, and weakness in the hands or feet). Alpha-lipoic acid is made by the body and can be found in foods such as organ meats, spinach, broccoli, peas, brussel sprouts, and rice bran. It can also be made in the laboratory. Alpha-lipoic acid is a type of antioxidant and chemoprotective agent.
  alpha-tocopherol: (AL-fuh-toh-KAH-feh-rol)
    Pronunciation of dictionary term "alpha-tocopherol"
    A nutrient that the body needs in small amounts to stay healthy and work the way it should. It is fat-soluble (can dissolve in fats and oils) and is found in seeds, nuts, leafy green vegetables, and vegetable oils. Alpha-tocopherol boosts the immune system and helps keep blood clots from forming. It also helps prevent cell damage caused by free radicals (highly reactive chemicals). Alpha-tocopherol is being studied in the prevention and treatment of some types of cancer. It is a type of antioxidant. Also called vitamin E.
    More Information
    - Cancer Prevention Overview
  alprazolam: (al-PRAY-zoh-lam)
    Pronunciation of dictionary term "alprazolam"
    A drug used to treat anxiety disorders and panic attacks. It is being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of benzodiazepine. Also called Xanax.
  alprostadil: (al-PROS-tuh-dil)
    Pronunciation of dictionary term "alprostadil"
    A drug that is used to treat impotence (inability to have an erection) and is being studied in the treatment of sexual problems in men who have had surgery for prostate cancer. It is a type of vasodilator. Also called PGE1 and prostaglandin E1.
  ALTENS: A procedure in which mild electric currents are applied to certain acupuncture points (spots on the body where an acupuncture needle may be inserted to control pain and other symptoms) on the skin. It is being studied in the treatment of dry mouth caused by radiation therapy for cancer. Also called acupuncture-like transcutaneous electrical nerve stimulation.
  Alteplase: (AL-teh-plays)
    Pronunciation of dictionary term "Alteplase"
    A form of tissue plasminogen activator that is made in the laboratory. It helps dissolve blood clots and is used to treat heart attacks, strokes, and clots in the lungs. It is also being studied in the treatment of cancer. It is a type of systemic thrombolytic agent. Also called Activase, r-tPA, and recombinant tissue plasminogen activator.
  alteration: (all-teh-RAY-shun)
    Pronunciation of dictionary term "alteration"
    A change resulting in something that is different from the original.
  alternative medicine: (all-TER-nuh-tiv MEH-dih-sin)
    Pronunciation of dictionary term "alternative medicine"
    Treatments that are used instead of standard treatments. Standard treatments are based on the results of scientific research and are currently accepted and widely used. Less research has been done for most types of alternative medicine. Alternative medicine may include special diets, megadose vitamins, herbal preparations, special teas, and magnet therapy. For example, a special diet may be used instead of anticancer drugs as a treatment for cancer.
    More Information
    - Complementary and Alternative Medicine (https://www.cancer.gov/about-cancer/treatment/cam)
  altretamine: (al-TREH-tuh-meen)
    Pronunciation of dictionary term "altretamine"
    An anticancer drug that belongs to the family of drugs called alkylating agents.
  alum: (A-lum)
    Pronunciation of dictionary term "alum"
    A chemical substance that contains aluminum sulfate and a second chemical, usually potassium sulfate. It is used to shrink tissues, to stop bleeding, and to boost the immune response to a vaccine.
  aluminum: (uh-LOO-mih-num)
    Pronunciation of dictionary term "aluminum"
    A metallic element that is found combined with other elements in the earth’s crust. It is also found in small amounts in soil, water, and many foods. It is used in medicine and dentistry and in many products such as foil, cans, pots and pans, airplanes, siding, and roofs. High levels of aluminum in the body can be harmful.
  Alunbrig: (uh-LUN-brig)
    Pronunciation of dictionary term "Alunbrig"
    A drug used to treat adults with non-small cell lung cancer that has spread and is ALK positive. It is also being studied in the treatment of other types of cancer. Alunbrig blocks certain proteins made by the ALK gene. Blocking these proteins may stop the growth and spread of cancer cells. Alunbrig is a type of tyrosine kinase inhibitor. Also called brigatinib.
    More Information
    - Brigatinib (https://www.cancer.gov/about-cancer/treatment/drugs/brigatinib)
  ALVAC-CEA vaccine: (… vak-SEEN)
    Pronunciation of dictionary term "ALVAC-CEA vaccine"
    A cancer vaccine made with a form of the canarypox virus that does not cause disease in people. It is being studied in the treatment of some kinds of cancer. The virus is changed in the laboratory to make a protein called carcinoembryonic antigen (CEA), which is a tumor marker. ALVAC-CEA vaccine may help the immune system find and kill cancer cells that make CEA.
  alveolar rhabdomyosarcoma: (al-VEE-oh-ler RAB-doh-MY-oh-sar-KOH-muh)
    Pronunciation of dictionary term "alveolar rhabdomyosarcoma"
    A soft tissue tumor that is most common in older children and teenagers. It begins in embryonic muscle cells (cells that develop into muscles in the body). It can occur at many places in the body, but usually occurs in the trunk, arms, or legs. Also called ARMS.
  alveolar soft part sarcoma: (al-VEE-oh-ler … sar-KOH-muh)
    Pronunciation of dictionary term "alveolar soft part sarcoma"
    A soft tissue tumor that is most common in older children and teenagers. It begins in the soft supporting tissue that connects and surrounds the organs and other tissues. Alveolar soft part sarcoma usually occurs in the legs, but can also occur in the arms, hands, head, or neck. It can cause the growth of new blood vessels that help the tumor grow and spread. Also called ASPS.
  alveoli: (al-VEE-oh-ly)
    Pronunciation of dictionary term "alveoli"
    Tiny air sacs at the end of the bronchioles (tiny branches of air tubes in the lungs). The alveoli are where the lungs and the blood exchange oxygen and carbon dioxide during the process of breathing in and breathing out. Oxygen breathed in from the air passes through the alveoli and into the blood and travels to the tissues throughout the body. Carbon dioxide travels in the blood from the body's tissues and passes through the alveoli to be breathed out.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  alvocidib: (al-VOH-sih-dib)
    Pronunciation of dictionary term "alvocidib"
    A substance being studied in the treatment of several types of cancer. It stops cells from dividing and may kill cancer cells. It is a type of cyclin-dependent kinase (CDK) inhibitor. Also called flavopiridol and HMR 1275.
  Alymsys: (uh-LIM-sis)
    Pronunciation of dictionary term "Alymsys"
    A drug that contains the active ingredient bevacizumab and is used to treat many different types of cancer. Alymsys is used alone or with other drugs to treat certain types of cervical cancer, colorectal cancer, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), glioblastoma (a type of brain cancer), and ovarian epithelial, fallopian tube, and primary peritoneal cancer. Alymsys binds to a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody.
    More Information
    - Bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
  Alzheimer dementia: (ALTS-hy-mer deh-MEN-shuh)
    Pronunciation of dictionary term "Alzheimer dementia"
    A brain disorder that usually starts in late middle age or old age and gets worse over time. Symptoms include loss of memory, confusion, difficulty thinking, and changes in language, behavior, and personality. Also called Alzheimer disease.
  Alzheimer disease: (ALTS-hy-mer dih-ZEEZ)
    Pronunciation of dictionary term "Alzheimer disease"
    A brain disorder that usually starts in late middle age or old age and gets worse over time. Symptoms include loss of memory, confusion, difficulty thinking, and changes in language, behavior, and personality. Also called Alzheimer dementia.
  Amanita phalloides: (a-muh-NY-tuh fuh-LOY-deez)
    Pronunciation of dictionary term "Amanita phalloides"
    A type of poisonous mushroom that has harmful effects on the kidneys and liver. It is responsible for most fatal cases of mushroom poisoning. Also called death cap.
  amantadine hydrochloride: (uh-MAN-tuh-deen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "amantadine hydrochloride"
    A drug used to treat infections caused by the influenza A virus. It blocks the ability of the virus to infect cells and to make more virus particles. It is also used to treat the symptoms of Parkinson disease. Amantidine hydrochloride is a type of antiviral agent.
  amatuximab: (A-muh-TUK-sih-mab)
    Pronunciation of dictionary term "amatuximab"
    A substance being studied in the treatment of mesothelioma. Amatuximab binds to a protein called mesothelin, which is found on some cancer cells. Amatuximab may help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called anti-mesothelin monoclonal antibody MORAb-009 and MORAb-009.
  Ambien: (AM-bee-un)
    Pronunciation of dictionary term "Ambien"
    A drug used to treat insomnia (inability to sleep), and anxiety. It is a type of imidazopyridine (sedative hypnotic). Also called zolpidem.
  AMD: A condition in which there is a slow breakdown of cells in the center of the retina (the light-sensitive layers of nerve tissue at the back of the eye). This blocks vision in the center of the eye and can cause problems with activities such as reading and driving. AMD is most often seen in people who are over the age of 50. Also called age-related macular degeneration, ARMD, and macular degeneration.
  AMD 3100: A drug used with granulocyte colony-stimulating factor before an autologous stem cell transplant in patients with non-Hodgkin lymphoma or multiple myeloma. It is also being studied in the treatment of other types of cancer. AMD 3100 helps move stem cells from the bone marrow to the blood so they can be collected, stored, and then given back to the patient. AMD 3100 is a type of hematopoietic stem cell mobilizer. Also called Mozobil and plerixafor.
    More Information
    - Plerixafor (https://www.cancer.gov/about-cancer/treatment/drugs/plerixafor)
  amelanotic melanoma: (AY-meh-luh-NAH-tik MEH-luh-NOH-muh)
    Pronunciation of dictionary term "amelanotic melanoma"
    A type of skin cancer in which the cells do not make the pigment melanin. Skin lesions are often irregular and may be pink, red, or have light brown, tan, or gray at the edges.
  ameloblastoma: (A-meh-loh-blas-TOH-muh)
    Pronunciation of dictionary term "ameloblastoma"
    A rare tumor that begins in the cells that form the tooth enamel (the hard, outer covering that protects the teeth) and most often occurs in the jaw near the molars. Ameloblastomas are usually not cancer, but they can grow quickly, cause pain and swelling, and damage nearby tissue. Rarely, they may come back or spread to other parts of the body. Ameloblastomas usually occur in adults.
    More Information
    - Ameloblastoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5747/ameloblastoma)
  Ameluz: (A-meh-looz)
    Pronunciation of dictionary term "Ameluz"
    A drug that contains the active ingredient aminolevulinic acid hydrochloride and is used with photodynamic therapy to treat actinic keratosis (a skin condition that may become cancer). When Ameluz is taken up by abnormal cells, including cancer cells, and then exposed to certain types of light, it becomes active and kills the cells. Ameluz is a type of photosensitizing agent.
    More Information
    - Aminolevulinic Acid Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/aminolevulinicacid)
  amethopterin: (A-meh-THOP-teh-rin)
    Pronunciation of dictionary term "amethopterin"
    A drug used to treat many types of cancer. It is also used to treat rheumatoid arthritis and severe psoriasis (a type of skin condition). Amethopterin stops cells from using folic acid to make DNA and may kill cancer cells. It may also lower the body’s immune response. Amethopterin is a type of antimetabolite and a type of antifolate. Also called methotrexate, MTX, Rheumatrex, and Trexall.
    More Information
    - Methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate)
  Amevive: (A-meh-veev)
    Pronunciation of dictionary term "Amevive"
    A drug that is used to treat certain skin conditions and is being studied in the treatment of cutaneous (skin-related) T-cell cancer and T-cell non-Hodgkin lymphoma. Amevive is made by combining part of an antibody with a protein that blocks the growth some types of T cells. It is a type of fusion protein and a type of immunosuppressant. Also called alefacept.
  AMG 102: A substance being studied in the treatment of cancer. It binds to a protein called hepatocyte growth factor (HGF), which may cause cancer cells to grow. Blocking this may cause cancer cells to die. AMG 102 is a type of monoclonal antibody. Also called anti-HGF monoclonal antibody AMG 102.
  AMG 162: A drug used to prevent or treat certain bone problems. AMG 162 is used under the brand name Xgeva to prevent bone problems caused by multiple myeloma or by solid tumors that have spread to the bone. It is also used in certain patients to treat giant cell tumor of the bone that cannot be removed by surgery, and to treat hypercalcemia that is caused by cancer and did not get better after treatment with bisphosphonates. AMG 162 is also used under the brand name Prolia to increase bone mass in certain patients with breast cancer or prostate cancer who have a high risk of breaking bones. It is also used to treat osteoporosis in certain patients who have a high risk of breaking bones. AMG 162 is also being studied in the treatment of other conditions and types of cancer. It binds to a protein called RANKL, which keeps RANKL from binding to another protein called RANK on the surface of certain bone cells, including bone cancer cells. This may help keep bone from breaking down and cancer cells from growing. AMG 162 may also prevent the loss of calcium from the bones. It is a type of monoclonal antibody. Also called denosumab.
    More Information
    - Denosumab (https://www.cancer.gov/about-cancer/treatment/drugs/denosumab)
  AMG 531: A drug used to treat thrombocytopenia (a low blood platelet count) in adults and in certain children with immune thrombocytopenic purpura that did not get better with other treatment. It is also being studied in the treatment of other conditions and types of cancer. AMG 531 binds to the thrombopoietin receptor, which causes the bone marrow to make more platelets. It is a type of thrombopoietin receptor agonist. Also called Nplate and romiplostim.
    More Information
    - Romiplostim (https://www.cancer.gov/about-cancer/treatment/drugs/romiplostim)
  AMG 706: A substance that is being studied in the treatment of some types of cancer. It belongs to the families of drugs called angiogenesis inhibitors and protein kinase inhibitors.
  AMH: A hormone made by the ovaries in females and the testicles in males. AMH helps to form the male and female reproductive organs. It also helps control other hormones that act on the ovaries to make the follicles and eggs grow during a woman’s menstrual cycle. Measuring the amount of AMH in the blood may help diagnose infertility and other conditions, such as polycystic ovarian syndrome, menopause, and certain types of ovarian tumors. It may also help determine the sex of an infant, when the sex is not clear. Also called anti-Mullerian hormone.
  amifostine: (A-mih-FOS-teen)
    Pronunciation of dictionary term "amifostine"
    A drug used to help protect the kidneys in patients receiving cisplatin for advanced ovarian cancer and to help reduce dry mouth in patients receiving radiation therapy after surgery for head and neck cancer. Amifostine helps protect healthy tissue from some of the side effects caused by certain types of cancer treatment. It is a type of chemoprotective agent and a type of radioprotective agent. Also called Ethyol.
    More Information
    - Amifostine (https://www.cancer.gov/about-cancer/treatment/drugs/amifostine)
  amikacin: (A-mih-KAY-sin)
    Pronunciation of dictionary term "amikacin"
    An antibiotic drug used to treat infection. It belongs to the family of drugs called aminoglycoside antibiotics.
  amino acid: (uh-MEE-noh A-sid)
    Pronunciation of dictionary term "amino acid"
    One of several molecules that join together to form proteins. There are 20 common amino acids found in proteins.
  amino acid sequence: (uh-MEE-noh A-sid SEE-kwents)
    Pronunciation of dictionary term "amino acid sequence"
    The arrangement of amino acids in a protein. Proteins can be made from 20 different kinds of amino acids, and the structure and function of each protein are determined by the kinds of amino acids used to make it and how they are arranged.
  aminobenzoic acid: (uh-MEE-noh-ben-ZOH-ik-A-sid)
    Pronunciation of dictionary term "aminobenzoic acid"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Bacteria that live in the intestines need aminobenzoic acid to survive. Aminobenzoic acid is found in grains and foods from animals. It is being studied as a radiosensitizer (a substance that makes tumor cells more sensitive to radiation therapy) and in the treatment of certain skin disorders. Also called PABA and para-aminobenzoic acid.
  aminocamptothecin: (uh-MEE-noh-KAMP-toh-THEH-kin)
    Pronunciation of dictionary term "aminocamptothecin"
    An anticancer drug that belongs to the family of drugs called topoisomerase inhibitors.
  aminoglutethimide: (uh-MEE-noh-gloo-TETH-ih-mide)
    Pronunciation of dictionary term "aminoglutethimide"
    An anticancer drug that belongs to the family of drugs called nonsteroidal aromatase inhibitors. Aminoglutethimide is used to decrease the production of sex hormones (estrogen in women or testosterone in men) and suppress the growth of tumors that need sex hormones to grow.
  aminoglycoside antibiotic: (uh-MEE-noh-GLY-koh-side AN-tee-by-AH-tik)
    Pronunciation of dictionary term "aminoglycoside antibiotic"
    A substance that works against many types of bacteria and includes streptomycin, gentamicin, and neomycin. An aminoglycoside antibiotic is used to treat bacterial infections.
  aminolevulinic acid: (uh-MEE-noh-LEH-vyoo-LIH-nik A-sid)
    Pronunciation of dictionary term "aminolevulinic acid"
    The active ingredient in a drug used to treat actinic keratosis (a skin condition that may become cancer). It is also being studied in the treatment of other conditions and types of cancer. When aminolevulinic acid is taken up by abnormal cells, including cancer cells, and then exposed to certain types of light, it becomes active and kills the cells. It may also help find some types of cancer cells when they are exposed to certain types of light. Aminolevulinic acid is a type of photosensitizing agent.
    More Information
    - Aminolevulinic Acid (https://www.cancer.gov/about-cancer/treatment/drugs/aminolevulinicacid)
  aminolevulinic acid hydrochloride: (uh-MEE-noh-LEH-vyoo-LIH-nik A-sid HY-droh-KLOR-ide)
    Pronunciation of dictionary term "aminolevulinic acid hydrochloride"
    A drug used under the brand names Ameluz and Levulan Kerastick with photodynamic therapy to treat actinic keratosis (a skin condition that may become cancer) and under the brand name Gleolan as an imaging agent during surgery for certain types of brain tumors. Aminolevulinic acid hydrochloride is also being studied in the treatment of other conditions and types of cancer. When aminolevulinic acid hydrochloride is taken up by abnormal cells, including cancer cells, and is then exposed to certain types of light, it becomes active and kills the cells. It may also help find some types of cancer cells when they are exposed to certain types of light. Aminolevulinic acid hydrochloride is a type of photosensitizing agent.
    More Information
    - Aminolevulinic Acid Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/aminolevulinicacid)
  aminopterin: (a-mih-NOP-teh-rin)
    Pronunciation of dictionary term "aminopterin"
    An anticancer drug that belongs to the family of drugs called antimetabolites.
  amiodarone hydrochloride: (A-mee-OH-duh-rone HY-droh-KLOR-ide)
    Pronunciation of dictionary term "amiodarone hydrochloride"
    A drug used to treat certain types of abnormal heart rhythms that have not gotten better with other drugs. Amiodarone hydrochloride affects the electrical activity of the heart. It is a type of antiarrhythmic agent. Also called Corderone.
  amitriptyline: (A-mih-TRIP-tih-LEEN)
    Pronunciation of dictionary term "amitriptyline"
    A drug that is used to treat depression and may be given to treat anxiety, sleep disorders, and pain. It is also being studied in an oral or gel form in the treatment of nerve pain caused by chemotherapy. Amitriptyline is a type of tricyclic antidepressant. Also called amitriptyline hydrochloride.
  amitriptyline hydrochloride: (A-mih-TRIP-tih-LEEN HY-droh-KLOR-ide)
    Pronunciation of dictionary term "amitriptyline hydrochloride"
    A drug that is used to treat depression and may be given to treat anxiety, sleep disorders, and pain. It is also being studied in an oral or gel form in the treatment of nerve pain caused by chemotherapy. Amitriptyline hydrochloride is a type of tricyclic antidepressant.
  amivantamab: (A-mih-VAN-tuh-mab)
    Pronunciation of dictionary term "amivantamab"
    A drug used alone or with other drugs to treat adults with non-small cell lung cancer that has spread and has an abnormal EGFR gene. It is used in patients whose cancer has not been treated with other anticancer therapy or has gotten worse during or after treatment with an EGFR tyrosine kinase inhibitor (a type of anticancer drug) or platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Amivantamab binds to receptors for proteins called EGF and MET, which are found on some types of cancer cells. Blocking these proteins may help keep cancer cells from growing. Amivantamab is a type of bispecific antibody. Also called Rybrevant.
    More Information
    - Amivantamab-vmjw (https://www.cancer.gov/about-cancer/treatment/drugs/amivantamab-vmjw)
  AML: A fast-growing cancer in which too many myeloblasts (a type of immature white blood cell) are found in the bone marrow and blood. AML usually gets worse quickly if it is not treated. It can spread outside the blood to other parts of the body, including the lymph nodes, spleen, liver, central nervous system (brain and spinal cord), skin, gums, and testicles. AML is most common in older adults. Also called acute myelogenous leukemia, acute myeloid leukemia, acute nonlymphocytic leukemia, and ANLL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  AML-MRC: A type of acute myeloid leukemia in which at least 20% of a patient’s blood or bone marrow is myeloblasts (immature white blood cells) and the patient has one of the following conditions: 1) has had myelodysplastic syndrome (MDS) or a myelodysplastic/myeloproliferative neoplasm (MDS/MPN) before, 2) cells that have changes in certain chromosomes that are similar to those found in MDS, or 3) at least 50% of the cells (of at least two types of blood cells) are abnormal. AML-MRC usually occurs in older adults and has a poor prognosis. Also called acute myeloid leukemia with myelodysplasia-related changes.
  ammonia: (uh-MOH-nyuh)
    Pronunciation of dictionary term "ammonia"
    A gas made of nitrogen and hydrogen. It has a strong odor and can irritate the skin, eyes, nose, throat, and lungs. Ammonia is made by bacteria and decaying plants and animals and is found in water, soil, and air. Ammonia is also made by the body when proteins break down. In the laboratory, ammonia can be changed to a liquid and used in medicines, fertilizers, household cleaning liquids, and other products. It is also added to cigarettes to increase the effect of nicotine on the body.
  ammonium tetrathiomolybdate: (uh-MOH-nee-um TEH-truh-THY-oh-muh-LIB-dayt)
    Pronunciation of dictionary term "ammonium tetrathiomolybdate"
    A substance being studied in the treatment of many types of cancer. Ammonium tetrathiomolybdate removes extra copper from the body. Removing the copper may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. Ammonium tetrathiomolybdate is a type of chelating agent and a type of antiangiogenesis agent.
  amniotic fluid: (AM-nee-AH-tik FLOO-id)
    Pronunciation of dictionary term "amniotic fluid"
    The clear or slightly yellow fluid that surrounds and protects an unborn baby as it grows during pregnancy. Amniotic fluid cushions the baby and helps keep the temperature in the womb constant. It also helps the growing baby’s lungs, digestive system, and bones develop properly. Amniotic fluid contains some of the baby’s cells and other substances. Samples of amniotic fluid may be taken to check the health of the baby and to test for genetic changes that may be a sign of a genetic disease or condition. Amniotic fluid also may be used to learn the sex of the baby.
  amonafide: (ay-MOH-nah-fide)
    Pronunciation of dictionary term "amonafide"
    A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called topoisomerase inhibitors and intercalating agents.
  amoxicillin: (uh-MOK-sih-SIH-lin)
    Pronunciation of dictionary term "amoxicillin"
    A drug used to treat some bacterial infections. Amoxicillin is a form of penicillin that is made in the laboratory. It kills certain types of bacteria. It is a type of antibiotic.
  amoxicillin-clavulanate potassium: (uh-MOK-sih-SIH-lin-kla-vyoo-LA-nayt puh-TA-see-um)
    Pronunciation of dictionary term "amoxicillin-clavulanate potassium"
    A drug used to treat bacterial infections. Adding the chemical clavulanate potassium to the antibiotic amoxicillin increases the amount of time the antibiotic stays active in the body. Amoxicillin-clavulanate potassium is a type of combination antibiotic. Also called Augmentin.
  amphotericin B: (AM-fuh-TAYR-ih-sin ...)
    Pronunciation of dictionary term "amphotericin B"
    A drug used in the treatment of infections caused by fungi. It is a type of antifungal.
  Amplimexon: (AM-plih-MEK-son)
    Pronunciation of dictionary term "Amplimexon"
    A substance that is being studied in the treatment of some types of cancer, including pancreatic, lung, breast, prostate, melanoma, and multiple myeloma. It belongs to the family of drugs called cyanoaziridine derivatives. Also called imexon.
  ampulla: (am-PUH-luh)
    Pronunciation of dictionary term "ampulla"
    A sac-like enlargement of a canal or duct.
  ampulla of Vater: (am-PUH-luh ... VAH-ter)
    Pronunciation of dictionary term "ampulla of Vater"
    An enlargement of the ducts from the liver and pancreas at the point where they enter the small intestine.
  ampulla of Vater cancer: (am-PUH-luh ... VAH-ter KAN-ser)
    Pronunciation of dictionary term "ampulla of Vater cancer"
    Cancer that forms in the ampulla of Vater (an enlargement of the ducts from the liver and pancreas where they join and enter the small intestine). Symptoms include jaundice, abdominal pain, nausea, vomiting, and weight loss. Also called ampullary cancer.
  ampullary cancer: (AM-puh-LAYR-ee KAN-ser)
    Pronunciation of dictionary term "ampullary cancer"
    Cancer that forms in the ampulla of Vater (an enlargement of the ducts from the liver and pancreas where they join and enter the small intestine). Symptoms include jaundice, abdominal pain, nausea, vomiting, and weight loss. Also called ampulla of Vater cancer.
  amputation: (am-pyoo-TAY-shun)
    Pronunciation of dictionary term "amputation"
    The removal by surgery of a limb (arm or leg) or other body part because of injury or disease, such as diabetes or cancer.
  amrubicin: (am-ROO-bih-sin)
    Pronunciation of dictionary term "amrubicin"
    A substance being studied in the treatment of lung cancer. It is a type of anthracycline analog.
  amsacrine: (AM-suh-kreen)
    Pronunciation of dictionary term "amsacrine"
    An anticancer drug that belongs to the family of drugs called topoisomerase inhibitors.
  Amtagvi: (am-TAG-vee)
    Pronunciation of dictionary term "Amtagvi"
    A treatment used for adults with melanoma that has spread to other parts of the body or cannot be removed by surgery. It is used in patients whose cancer did not get better after treatment with an antibody that blocks PD-1 (and treatment with a BRAF inhibitor, for those with a BRAF mutation). It is also being studied in the treatment of other types of cancer. Amtagvi is made using tumor-infiltrating lymphocytes (a type of immune cell that can recognize and kill tumor cells) from a patient’s tumor. These lymphocytes are tested in the laboratory to find out which ones best recognize the tumor cells. The selected lymphocytes are then grown in large numbers in the laboratory and given back to the patient to help the immune system kill the tumor cells. Amtagvi is a type of cellular immunotherapy called tumor-infiltrating lymphocyte therapy. Also called lifileucel.
    More Information
    - Lifileucel (https://www.cancer.gov/about-cancer/treatment/drugs/lifileucel)
  amuvatinib: (AM-yoo-VA-tih-nib)
    Pronunciation of dictionary term "amuvatinib"
    A substance being studied in the treatment of some types of cancer. It may block certain proteins involved in cancer cell growth and DNA repair. Blocking these proteins may make cancer cells more sensitive to anticancer drugs and radiation therapy. Amuvatinib is a type of tyrosine kinase inhibitor. Also called MP470.
  amygdalin: (uh-MIG-duh-lin)
    Pronunciation of dictionary term "amygdalin"
    A substance found in the pits of some fruits, such as apricots, and in raw nuts and plants. Amygdalin has been used in some countries as a treatment for cancer, but it has not been shown to work in human clinical trials. It is not approved for use in the United States. Amygdalin is sometimes called vitamin B17.
    More Information
    - Laetrile/Amygdalin
  amylase: (A-mih-lays)
    Pronunciation of dictionary term "amylase"
    An enzyme that helps the body digest starches.
  amyloidosis: (A-muh-loy-DOH-sis)
    Pronunciation of dictionary term "amyloidosis"
    A group of diseases in which protein builds up in certain organs (localized amyloidosis) or throughout the body (systemic amyloidosis). Amyloidosis may be either primary (with no known cause), secondary (caused by another disease, including some types of cancer, such as multiple myeloma), or hereditary (passed down from parents to children). Many organs are affected by amyloidosis. The organs affected may depend on whether the amyloidosis is the primary, secondary, or hereditary form.
  anabolic steroid: (A-nuh-BAH-lik STAYR-oyd)
    Pronunciation of dictionary term "anabolic steroid"
    A type of steroid that is used in medicine to repair body tissues and to increase appetite and the growth of muscles. Anabolic steroids are made in the laboratory from testosterone (a male hormone).
  anagrelide: (an-AG-re-lide)
    Pronunciation of dictionary term "anagrelide"
    A drug that is used to decrease the number of platelets in the blood in order to prevent blood clotting.
  anakinra: (A-nuh-KIN-ruh)
    Pronunciation of dictionary term "anakinra"
    A substance that is used to treat rheumatoid arthritis, and is being studied in the treatment of cancer. Anakinra blocks the action of interleukin 1 (IL-1). It is a type of interleukin receptor antagonist. Also called Kinaret.
  anal: (AY-nul)
    Pronunciation of dictionary term "anal"
    Having to do with the anus. The anus is the opening of the rectum (last part of the large intestine) to the outside of the body.
    More Information
    - Anal Cancer (https://www.cancer.gov/types/anal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
  anal cancer: (AY-nul KAN-ser)
    Pronunciation of dictionary term "anal cancer"
    Cancer that forms in tissues of the anus. The anus is the opening of the rectum (last part of the large intestine) to the outside of the body.
    More Information
    - Anal Cancer (https://www.cancer.gov/types/anal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
  anal dysplasia: (AY-nul dis-PLAY-zhuh)
    Pronunciation of dictionary term "anal dysplasia"
    The abnormal growth of cells in the lining of the anal canal or in the skin around the outside of the anus called the perianal area. Anal dysplasia is usually caused by certain types of human papillomavirus (HPV). It can be low grade or high grade, depending on how abnormal the cells look under a microscope and how much of the anal tissue is affected. Anal dysplasia is not cancer but may become cancer and spread to nearby normal tissue. It is sometimes called anal intraepithelial neoplasia (AIN) or anal squamous intraepithelial lesion.
  anal Pap smear: (AY-nul … smeer)
    Pronunciation of dictionary term "anal Pap smear"
    A procedure in which cells are scraped from the lining of the anus (the opening of the rectum to the outside of the body) and looked at under a microscope. It is used to find cancer and changes in cells that may lead to cancer. An anal Pap smear can also show conditions that are not cancer, such as infection or inflammation. Also called anal Pap test.
  anal Pap test: (AY-nul …)
    Pronunciation of dictionary term "anal Pap test"
    A procedure in which cells are scraped from the lining of the anus (the opening of the rectum to the outside of the body) and looked at under a microscope. It is used to find cancer and changes in cells that may lead to cancer. An anal Pap test can also show conditions that are not cancer, such as infection or inflammation. Also called anal Pap smear.
  anal wart: (AY-nul wort)
    Pronunciation of dictionary term "anal wart"
    A raised growth in or around the anus caused by human papillomavirus (HPV). HPV can spread by skin-to-skin contact, usually during oral, anal, or genital sex with an infected partner. Anal warts often appear as small, light brown or skin-colored bumps that may be clumped together. They are usually painless and do not cause any symptoms, so a person may not know they have them. However, sometimes they can grow large and cause itching and bleeding. Anal warts may come back after treatment. People who have had anal warts have an increased risk of developing anal cancer.
  analgesia: (A-nul-JEE-zhee-uh)
    Pronunciation of dictionary term "analgesia"
    Pain relief.
  analgesic: (A-nul-JEE-zik)
    Pronunciation of dictionary term "analgesic"
    A drug that reduces pain. Analgesics include aspirin, acetaminophen, and ibuprofen.
  analog: (A-nuh-log)
    Pronunciation of dictionary term "analog"
    In chemistry, a substance that is similar, but not identical, to another.
  analysis: (uh-NA-lih-sis)
    Pronunciation of dictionary term "analysis"
    A process in which anything complex is separated into simple or less complex parts.
  anaphylactic shock: (A-nuh-fih-LAK-tik shok)
    Pronunciation of dictionary term "anaphylactic shock"
    A severe and sometimes life-threatening immune system reaction to an antigen that a person has been previously exposed to. The reaction may include itchy skin, edema, collapsed blood vessels, fainting, difficulty in breathing, and death.
  anaplastic: (A-nuh-PLAS-tik)
    Pronunciation of dictionary term "anaplastic"
    A term used to describe cancer cells that divide rapidly and have little or no resemblance to normal cells.
  anaplastic large cell lymphoma: (A-nuh-PLAS-tik larj sel lim-FOH-muh)
    Pronunciation of dictionary term "anaplastic large cell lymphoma"
    An aggressive (fast-growing) type of non-Hodgkin lymphoma that is usually of the T-cell type. The cancer cells express a marker called CD30 or Ki-1 on the surface, and may appear in the lymph nodes, skin, bones, soft tissues, lungs, or liver. Also called ALCL.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  anaplastic lymphoma kinase: (A-nuh-PLAS-tik lim-FOH-muh KY-nays)
    Pronunciation of dictionary term "anaplastic lymphoma kinase"
    A protein that helps control cell growth. It is made by the anaplastic lymphoma kinase (ALK) gene, which may be changed in some types of cancer, such as anaplastic large cell lymphoma, neuroblastoma, and non-small cell lung cancer. These changes in the ALK gene can cause the cancer cells to grow and spread. Anaplastic lymphoma kinase is a type of receptor tyrosine kinase.
  anaplastic lymphoma kinase gene: (A-nuh-PLAS-tik lim-FOH-muh KY-nays jeen)
    Pronunciation of dictionary term "anaplastic lymphoma kinase gene"
    A gene that makes a protein that is involved in cell growth. Mutated (changed) forms of the anaplastic lymphoma kinase gene and protein have been found in some types of cancer, including neuroblastoma, non-small cell lung cancer, and anaplastic large cell lymphoma. These changes may increase the growth of cancer cells. Checking for changes in the anaplastic lymphoma kinase gene in tumor tissue may help to plan cancer treatment. Also called ALK gene.
  anaplastic lymphoma kinase inhibitor: (A-nuh-PLAS-tik lim-FOH-muh KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "anaplastic lymphoma kinase inhibitor"
    A substance that blocks the activity of a protein called anaplastic lymphoma kinase (ALK), which helps control cell growth. Blocking this protein may help keep cancer cells from growing and spreading. Some anaplastic lymphoma kinase inhibitors are used to treat cancer. They are a type of targeted therapy. Also called ALK inhibitor.
  anaplastic lymphoma kinase positive: (A-nuh-PLAS-tik lim-FOH-muh KY-nays PAH-zih-tiv)
    Pronunciation of dictionary term "anaplastic lymphoma kinase positive"
    Describes cells that have a protein called ALK on their surface. In cancer, it is also used to describe cells that have a change in the structure of the ALK gene or that make too much ALK protein. In normal cells, ALK helps control cell growth. Cancer cells that have the changed ALK gene or make too much ALK protein may grow more quickly. Knowing whether a cancer is anaplastic lymphoma kinase positive may help plan treatment. Cancers that may be anaplastic lymphoma kinase positive include neuroblastoma, non-small cell lung cancer, and anaplastic large cell lymphoma. Also called ALK positive.
  anaplastic thyroid cancer: (A-nuh-PLAS-tik THY-royd KAN-ser)
    Pronunciation of dictionary term "anaplastic thyroid cancer"
    A rare, aggressive type of thyroid cancer in which the malignant (cancer) cells look very different from normal thyroid cells.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
  anastomosis: (uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "anastomosis"
    A procedure to connect healthy sections of tubular structures in the body after the diseased portion has been surgically removed.
  anastrozole: (an-AS-troh-zole)
    Pronunciation of dictionary term "anastrozole"
    A drug used to treat certain types of breast cancer in postmenopausal women. It is also being studied in the treatment of other types of cancer. Anastrozole lowers the amount of estrogen made by the body. This may stop the growth of cancer cells that need estrogen to grow. Anastrozole is a type of nonsteroidal aromatase inhibitor. Also called Arimidex.
    More Information
    - Anastrozole (https://www.cancer.gov/about-cancer/treatment/drugs/anastrozole)
  anatomic: (A-nuh-TAH-mik)
    Pronunciation of dictionary term "anatomic"
    Having to do with anatomy (the study of the structure of a plant or animal).
  anatomist: (uh-NA-tuh-mist)
    Pronunciation of dictionary term "anatomist"
    A person who has special training in anatomy (the study of the structures of animals or plants).
  anatomy: (uh-NA-toh-mee)
    Pronunciation of dictionary term "anatomy"
    The study of the structure of a plant or animal. Human anatomy includes the cells, tissues, and organs that make up the body and how they are organized in the body.
  ANC: A measure of the number of neutrophils in the blood. Neutrophils are a type of white blood cell. They help the body fight infection. An ANC may be used to check for infection, inflammation, leukemia, and other conditions. The lower a person's ANC is, the higher the risk is of getting an infection. Having an ANC of less than 500 means there is a high risk of getting an infection. Cancer treatment, such as chemotherapy, may reduce the ANC. Also called absolute neutrophil count.
  ancestim: (an-SES-tim)
    Pronunciation of dictionary term "ancestim"
    A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. It is being studied in the treatment of myelodysplasia. Ancestim is a type of recombinant stem cell growth factor. Also called r-metHuSCF, recombinant human methionyl stem cell factor, and Stemgen.
  ancillary test: (AN-sih-LAYR-ree …)
    Pronunciation of dictionary term "ancillary test"
    In a clinical trial, a medical test on a patient that is not a part of the original study design.
  androblastoma: (AN-droh-blas-TOH-muh)
    Pronunciation of dictionary term "androblastoma"
    A rare tumor that forms in the tissues that surround and support the ovaries. Androblastomas make a male sex hormone called testosterone. These tumors can cause the appearance of male physical features, such as facial hair, a deep voice, and other symptoms. Androblastomas may be benign (not cancer) or malignant (cancer). They tend to have a good prognosis if diagnosed and treated early. Androblastomas are a type of sex cord-stromal tumor. Also called arrhenoblastoma and Sertoli-Leydig cell tumor.
  androgen: (AN-droh-jen)
    Pronunciation of dictionary term "androgen"
    A type of hormone that promotes the development and maintenance of male sex characteristics.
  androgen ablation: (AN-droh-jen a-BLAY-shun)
    Pronunciation of dictionary term "androgen ablation"
    Treatment to suppress or block the production or action of male hormones. This is done by having the testicles removed, by taking female sex hormones, or by taking drugs called antiandrogens. Also called androgen deprivation and androgen suppression.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen deprivation: (AN-droh-jen DEH-prih-VAY-shun)
    Pronunciation of dictionary term "androgen deprivation"
    Treatment to suppress or block the production or action of male hormones. This is done by having the testicles removed, by taking female sex hormones, or by taking drugs called antiandrogens. Also called androgen ablation and androgen suppression.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen receptor: (AN-droh-jen reh-SEP-ter)
    Pronunciation of dictionary term "androgen receptor"
    A protein that binds male hormones called androgens. Androgen receptors are found inside the cells of male reproductive tissue, some other types of tissue, and some cancer cells. In prostate cancer, androgens bind to androgen receptors inside the cancer cells, which causes the cancer cells to grow. Also called AR.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen receptor antagonist: (AN-droh-jen reh-SEP-ter an-TA-guh-nist)
    Pronunciation of dictionary term "androgen receptor antagonist"
    A substance that keeps androgens (male sex hormones) from binding to proteins called androgen receptors, which are found in normal prostate cells, some prostate cancer cells, and in cells of some other tissues. Preventing this binding blocks the effects of these hormones in the body. Treatment with androgen receptor antagonists may keep prostate cancer cells from growing. Examples of androgen receptor antagonists used to treat prostate cancer are apalutamide, bicalutamide, darolutamide, enzalutamide, flutamide, and nilutamide. Also called androgen receptor blocker and antiandrogen.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen receptor blocker: (AN-droh-jen reh-SEP-ter BLAH-ker)
    Pronunciation of dictionary term "androgen receptor blocker"
    A substance that keeps androgens (male sex hormones) from binding to proteins called androgen receptors, which are found in normal prostate cells, some prostate cancer cells, and in cells of some other tissues. Preventing this binding blocks the effects of these hormones in the body. Treatment with androgen receptor blockers may keep prostate cancer cells from growing. Examples of androgen receptor blockers used to treat prostate cancer are apalutamide, bicalutamide, darolutamide, enzalutamide, flutamide, and nilutamide. Also called androgen receptor antagonist and antiandrogen.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen receptor negative: (AN-droh-jen reh-SEP-ter NEH-guh-tiv)
    Pronunciation of dictionary term "androgen receptor negative"
    Describes cells that do not have a protein that binds to androgens (male hormones). Cancer cells that are androgen receptor negative do not need androgens to grow. This means that they will keep growing when androgens are not present and do not stop growing when treatments that block androgens in the body are used. This can affect how the cancer is treated. Also called AR negative.
  androgen receptor positive: (AN-droh-jen reh-SEP-ter PAH-zih-tiv)
    Pronunciation of dictionary term "androgen receptor positive"
    Describes cells that have a protein that binds to androgens (male hormones). Cancer cells that are androgen receptor positive may need androgens to grow. These cells may stop growing or die when they are treated with substances that block the binding and actions of androgen hormones. Also called AR positive.
  androgen suppression: (AN-droh-jen suh-PREH-shun)
    Pronunciation of dictionary term "androgen suppression"
    Treatment to suppress or block the production or action of male hormones. This is done by having the testicles removed, by taking female sex hormones, or by taking drugs called antiandrogens. Also called androgen ablation and androgen deprivation.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen synthesis inhibitor: (AN-droh-jen SIN-theh-sis in-HIH-bih-ter)
    Pronunciation of dictionary term "androgen synthesis inhibitor"
    A substance that blocks an enzyme called CYP17, which the body needs to make androgens (male hormones), such as testosterone. Blocking CYP17 may stop the growth of cancer cells that need androgens to grow. Androgen synthesis inhibitors are used to treat some types of prostate cancer. Examples of androgen synthesis inhibitors are abiraterone and ketoconazole.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen-dependent prostate cancer: (AN-droh-jen-deh-PEN-dent PROS-tayt KAN-ser)
    Pronunciation of dictionary term "androgen-dependent prostate cancer"
    Prostate cancer that needs androgens (male hormones) to grow and therefore stops growing when androgens are not present. Many early-stage prostate cancers are androgen-dependent, so reducing the amount of androgens in the body or blocking their action may be an effective type of therapy. Also called androgen-sensitive prostate cancer, castrate-sensitive prostate cancer, CSPC, hormone-sensitive prostate cancer, and HSPC.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen-independent: (AN-droh-jen...)
    Pronunciation of dictionary term "androgen-independent"
    Describes the ability of tumor cells to grow in the absence of androgens (hormones that promote the development and maintenance of male sex characteristics). Many early prostate cancers require androgens for growth, but advanced prostate cancers are often androgen-independent.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androgen-sensitive prostate cancer: (AN-droh-jen-SEN-sih-tiv PROS-tayt KAN-ser)
    Pronunciation of dictionary term "androgen-sensitive prostate cancer"
    Prostate cancer that needs androgens (male hormones) to grow and therefore stops growing when androgens are not present. Many early-stage prostate cancers are androgen-dependent, so reducing the amount of androgens in the body or blocking their action may be an effective type of therapy. Also called androgen-dependent prostate cancer, castrate-sensitive prostate cancer, CSPC, hormone-sensitive prostate cancer, and HSPC.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  androstanolone: (AN-droh-STAN-uh-lone)
    Pronunciation of dictionary term "androstanolone"
    A hormone made from testosterone in the prostate, testes, and certain other tissues. It is needed to develop and maintain male sex characteristics, such as facial hair, deep voice, and muscle growth. High amounts of androstanolone may increase the growth of prostate cancer and make it harder to treat. Also called DHT and dihydrotestosterone.
  anecdotal report: (A-nek-DOH-tul reh-PORT)
    Pronunciation of dictionary term "anecdotal report"
    An incomplete description of the medical and treatment history of one or more patients. Anecdotal reports may be published in places other than peer-reviewed, scientific journals.
  anemia: (uh-NEE-mee-uh)
    Pronunciation of dictionary term "anemia"
    A condition in which the number of red blood cells is below normal.
    More Information
    - Anemia and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/anemia)
  anesthesia: (A-nes-THEE-zhuh)
    Pronunciation of dictionary term "anesthesia"
    A loss of feeling or awareness caused by drugs or other substances. Anesthesia keeps patients from feeling pain during surgery or other procedures. Local anesthesia is a loss of feeling in one small area of the body. Regional anesthesia is a loss of feeling in a part of the body, such as an arm or leg. General anesthesia is a loss of feeling and a complete loss of awareness that feels like a very deep sleep.
  anesthesiologist: (A-nes-THEE-zee-AH-loh-jist)
    Pronunciation of dictionary term "anesthesiologist"
    A doctor who has special training in giving drugs or other agents to prevent or relieve pain during surgery or other procedures.
  anesthetic: (A-nes-THEH-tik)
    Pronunciation of dictionary term "anesthetic"
    A drug or other substance that causes a loss of feeling or awareness. Local anesthetics cause a loss of feeling in one small area of the body. Regional anesthetics cause a loss of feeling in a part of the body, such as an arm or leg. General anesthetics cause a loss of feeling and a complete loss of awareness that feels like a very deep sleep.
  anetholtrithione: (A-neh-thol-try-THY-one)
    Pronunciation of dictionary term "anetholtrithione"
    A substance that is being studied in the treatment of cancer.
  aneuploidy: (AN-yoo-PLOY-dee)
    Pronunciation of dictionary term "aneuploidy"
    A condition in which there are extra or missing chromosomes in some or all the cells in the body. Human cells, except for egg and sperm cells, normally contain 23 pairs of chromosomes, for a total of 46 chromosomes in each cell. With aneuploidy, the number of chromosomes does not equal 46. For example, people with Down syndrome have three copies of chromosome 21 in each cell.
    More Information
    - Can changes in the number of chromosomes affect health and development? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/mutationsanddisorders/chromosomalconditions/)
  angelica root: (an-JEH-lih-kuh root)
    Pronunciation of dictionary term "angelica root"
    The root of any of a group of herbs called Angelica. It has been used in some cultures to treat certain medical problems, including gastrointestinal problems such as loss of appetite, feelings of fullness, and gas.
  Angiocept: (AN-jee-oh-sept)
    Pronunciation of dictionary term "Angiocept"
    A substance being studied in the treatment of cancer. Angiocept may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of vascular endothelial growth factor receptor-2 (VEGFR-2) inhibitor and a type of antiangiogenesis agent. Also called CT-322 and VEGFR-2 inhibitor CT-322.
  angiofibroma: (AN-jee-oh-fy-BROH-muh)
    Pronunciation of dictionary term "angiofibroma"
    A benign (not cancer) tumor that is made up of blood vessels and fibrous (connective) tissue. Angiofibromas usually appear as small, red bumps on the face, especially on the nose and cheeks. They are common in patients with tuberous sclerosis (a genetic disorder that causes skin lesions, seizures, and mental problems). Angiofibromas are a type of vascular tumor.
  angiofollicular lymph node hyperplasia: (AN-jee-oh-fuh-LIH-kyoo-ler limf node HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "angiofollicular lymph node hyperplasia"
    A rare disorder in which benign (not cancer) growths form in lymph node tissue. There are two main ways that angiofollicular lymph node hyperplasia occurs: localized (unicentric) and multicentric. Unicentric angiofollicular lymph node hyperplasia affects only one group of lymph nodes in one part of the body, usually in the chest or abdomen. It may not cause symptoms. Multicentric angiofollicular lymph node hyperplasia affects many groups of lymph nodes and lymphoid tissue all through the body. It can weaken the immune system and cause problems such as infection, fever, weight loss, fatigue, night sweats, nerve damage, and anemia. People with angiofollicular lymph node hyperplasia have an increased risk of lymphoma. Also called Castleman disease and giant lymph node hyperplasia.
  angiogenesis: (AN-jee-oh-JEH-neh-sis)
    Pronunciation of dictionary term "angiogenesis"
    Blood vessel formation. Tumor angiogenesis is the growth of new blood vessels that tumors need to grow. This process is caused by the release of chemicals by the tumor and by host cells near the tumor.
    More Information
    - Angiogenesis Inhibitors (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/angiogenesis-inhibitors-fact-sheet)
  angiogenesis inhibitor: (AN-jee-oh-JEH-neh-sis in-HIH-bih-ter)
    Pronunciation of dictionary term "angiogenesis inhibitor"
    A drug or substance that keeps new blood vessels from forming. In cancer treatment, angiogenesis inhibitors may prevent the growth of new blood vessels that tumors need to grow. Also called antiangiogenesis agent.
    More Information
    - Angiogenesis Inhibitors (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/angiogenesis-inhibitors-fact-sheet)
  angiogram: (AN-jee-oh-gram)
    Pronunciation of dictionary term "angiogram"
    An x-ray or computer image (CT scan or MRI) of the blood vessels and blood flow in the body. A dye may be injected through a catheter (small tube) into an artery or vein to make the blood vessels easier to see. An angiogram may be used to check for an aneurysm (a bulge in a blood vessel wall), blockages in arteries, blood clots, or other problems, such as a tumor.
  angiography: (an-jee-AH-gruh-fee)
    Pronunciation of dictionary term "angiography"
    A procedure to x-ray blood vessels. The blood vessels can be seen because of an injection of a dye that shows up in the x-ray.
  angioimmunoblastic T-cell lymphoma: (AN-jee-oh-IH-myoo-noh-BLAS-tik T-sel lim-FOH-muh)
    Pronunciation of dictionary term "angioimmunoblastic T-cell lymphoma"
    An aggressive (fast-growing) type of T-cell non-Hodgkin lymphoma marked by enlarged lymph nodes and hypergammaglobulinemia (increased antibodies in the blood). Other symptoms may include a skin rash, fever, weight loss, or night sweats.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  angiolymphoid hyperplasia with eosinophilia: (AN-jee-oh-LIM-foyd HY-per-PLAY-zhuh … EE-oh-SIH-noh-FIH-lee-uh)
    Pronunciation of dictionary term "angiolymphoid hyperplasia with eosinophilia"
    A rare benign (not cancer) tumor of small blood vessels surrounded by lymphocytes and eosinophils (types of white blood cells). Angiolymphoid hyperplasia with eosinophilia usually forms on or in the skin, especially the skin of the head, but can occur in other areas of the body, such as in bone. On the skin, it may appear as firm pink to red bumps that may be itchy or painful. If the tumor is in bone, it may cause swelling and pain. Angiolymphoid hyperplasia with eosinophilia is sometimes caused by injury and often comes back after treatment. Angiolymphoid hyperplasia with eosinophilia is most common in young and middle-aged adults. It is a type of vascular tumor. Also called epithelioid hemangioma and histiocytoid hemangioma.
  angiomyolipoma: (AN-jee-oh-MY-oh-lih-POH-muh)
    Pronunciation of dictionary term "angiomyolipoma"
    A benign (noncancer) tumor of fat and muscle tissue that usually is found in the kidney. Angiomyolipomas rarely cause symptoms, but may bleed or grow large enough to be painful or cause kidney failure. They are common in patients with tuberous sclerosis (a genetic disorder in which benign tumors grow in the kidneys, brain, eyes, heart, lungs, and skin, causing seizures, mental problems, and skin lesions).
  angioplasty: (AN-jee-oh-PLAS-tee)
    Pronunciation of dictionary term "angioplasty"
    A procedure to enlarge the opening in a blood vessel that has become narrowed or blocked by plaque (a buildup of fat and cholesterol on the inner wall of the blood vessel). Examples of angioplasty are balloon angioplasty and laser angioplasty.
  angiosarcoma: (AN-jee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "angiosarcoma"
    A type of cancer that begins in the cells that line blood vessels or lymph vessels. Cancer that begins in blood vessels is called hemangiosarcoma. Cancer that begins in lymph vessels is called lymphangiosarcoma.
    More Information
    - Soft Tissue Sarcoma (https://www.cancer.gov/types/soft-tissue-sarcoma)
  angiostatin: (AN-jee-oh-STA-tin)
    Pronunciation of dictionary term "angiostatin"
    A protein normally made by the body. It can also be made in the laboratory, and is being studied in the treatment of cancer. Angiostatin may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent.
  angiotensin-converting enzyme inhibitor: (AN-jee-oh-TEN-sin-kun-VER-ting EN-zime in-HIH-bih-ter)
    Pronunciation of dictionary term "angiotensin-converting enzyme inhibitor"
    A drug that is used to lower blood pressure. An angiotensin-converting enzyme inhibitor is a type of antihypertensive agent. Also called ACE inhibitor.
  Angiozyme: (AN-jee-oh-zime)
    Pronunciation of dictionary term "Angiozyme"
    A substance being studied in the treatment of cancer. Angiozyme is a special type of RNA made in the laboratory. It stops a protein called vascular endothelial growth factor receptor (VEGFR) from being made. This may prevent the growth of new blood vessels that tumors need to grow. It is a type of angiogenesis inhibitor and a type of ribozyme. Also called RPI.4610.
  ANH: A form of nutrition that is given as liquids, including liquid foods, through a tube inserted into a vein, under the skin, or into the stomach or small intestine. ANH is given when a person is not able to eat or drink by mouth or has a disease or condition that affects their ability to absorb nutrients through the digestive system. For people near death, it does not help prolong life and is usually not given because it can cause severe problems, such as infection, aspiration (the breathing in of fluid or food into the lungs), diarrhea, and cramping. Also called artificial nutrition and hydration.
  anhidrosis: (AN-hih-DROH-sis)
    Pronunciation of dictionary term "anhidrosis"
    A rare condition in which the sweat glands make little or no sweat. It can affect the whole body or a small part of the body. Anhidrosis may be caused by severe burns, radiation, infection, inflammation, or other injuries to the skin. It may also be caused by certain medicines and some conditions that affect the skin, nerves, connective tissue, or sweat glands. It may be inherited as part of a genetic condition or develop later in life. Also called hypohidrosis.
  anhydrovinblastine: (an-HY-droh-vin-BLAS-teen)
    Pronunciation of dictionary term "anhydrovinblastine"
    An anticancer drug that belongs to the family of drugs called mitotic inhibitors.
  anidulafungin: (uh-NIH-dyoo-luh-FUN-jin)
    Pronunciation of dictionary term "anidulafungin"
    A drug that is used to treat infections caused by fungi. It belongs to the family of drugs called antifungals.
  animal model: (A-nih-mul MAH-dul)
    Pronunciation of dictionary term "animal model"
    An animal with a disease either the same as or like a disease in humans. Animal models are used to study the development and progression of diseases and to test new treatments before they are given to humans. Animals with transplanted human cancers or other tissues are called xenograft models.
  animal study: (A-nih-mul STUH-dee)
    Pronunciation of dictionary term "animal study"
    A laboratory experiment using animals to study the development and progression of diseases. Animal studies also test how safe and effective new treatments are before they are tested in people.
  animal-assisted therapy: (A-nih-mul-uh-SIS-ted THAYR-uh-pee)
    Pronunciation of dictionary term "animal-assisted therapy"
    A type of therapy that uses dogs or other pets to improve the physical and mental health of patients with certain acute or chronic diseases. It is being studied as a way to relieve distress in cancer patients undergoing treatment for pain. Also called pet-facilitated therapy.
  aniridia: (A-nih-RIH-dee-uh)
    Pronunciation of dictionary term "aniridia"
    A disorder in which a person is born without part or all of the iris (colored tissue at the front of the eyeball). Aniridia usually affects both eyes and causes other eye problems, including being sensitive to light and loss of vision.
    More Information
    - Aniridia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5816/aniridia)
    - Aniridia (MedlinePlus) (https://medlineplus.gov/genetics/condition/aniridia/)
  Anktiva: (ank-TEE-vuh)
    Pronunciation of dictionary term "Anktiva"
    A drug used with bacillus Calmette-Guérin (BCG) to treat adults with bladder cancer that has not invaded the muscle layers of the bladder and with carcinoma in situ. Patients may or may not have a papillary tumor (a tumor that looks like long, thin “finger-like” growths). Anktiva is used in patients whose cancer has not gotten better after treatment with BCG. It is given with BCG as a solution through a catheter (thin tube) that is placed into the bladder. It is also being studied in the treatment of other types of cancer. Anktiva binds to receptors for the protein interleukin-15 (IL-15), which is found on certain types of immune cells. This may help the immune cells kill cancer cells better than BCG alone. Anktiva is a type of IL-15 receptor agonist and a type of immunotherapy. Also called nogapendekin alfa inbakicept.
    More Information
    - Nogapendekin Alfa Inbakicept-pmln (https://www.cancer.gov/about-cancer/treatment/drugs/nogapendekin-alfa-inbakicept-pmln)
  ANLL: A fast-growing cancer in which too many myeloblasts (a type of immature white blood cell) are found in the bone marrow and blood. ANLL usually gets worse quickly if it is not treated. It can spread outside the blood to other parts of the body, including the lymph nodes, spleen, liver, central nervous system (brain and spinal cord), skin, gums, and testicles. ANLL is most common in older adults. Also called acute myelogenous leukemia, acute myeloid leukemia, acute nonlymphocytic leukemia, and AML.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  annamycin: (A-nuh-MY-sin)
    Pronunciation of dictionary term "annamycin"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called anthracycline antibiotics.
  anorexia: (a-nuh-REK-see-uh)
    Pronunciation of dictionary term "anorexia"
    An abnormal loss of the appetite for food. Anorexia can be caused by cancer, AIDS, a mental disorder (i.e., anorexia nervosa), or other diseases.
  anorexia nervosa: (a-nuh-REK-see-uh ner-VOH-suh)
    Pronunciation of dictionary term "anorexia nervosa"
    An eating disorder marked by an intense fear of gaining weight, a refusal to maintain a healthy weight, and a distorted body image. People with anorexia nervosa have an abnormal loss of appetite for food, try to avoid eating, and eat as little as possible.
  anoscopy: (ay-NOS-koh-pee)
    Pronunciation of dictionary term "anoscopy"
    A procedure in which a short, lighted tube called an anoscope is inserted into the anus and lower part of the rectum to check for abnormal areas. The anoscope may be used with a special magnifying instrument called a colposcope and a weak acetic acid solution to make abnormal tissue easier to see. Tissue samples may be removed so they can be checked under a microscope for signs of disease. An anoscopy may be used to help diagnose cancers of the anus or rectum. It may also be used to diagnose other conditions, such as hemorrhoids, anal fissures (tears), and anal polyps.
    More Information
    - Anoscopy (MedlinePlus) (https://medlineplus.gov/lab-tests/anoscopy/)
  ANS: The part of the nervous system that controls muscles of internal organs (such as the heart, blood vessels, lungs, stomach, and intestines) and glands (such as salivary glands and sweat glands). One part of the ANS helps the body rest, relax, and digest food and another part helps a person fight or take flight in an emergency. Also called autonomic nervous system and involuntary nervous system.
  ansamycin: (AN-suh-MY-sin)
    Pronunciation of dictionary term "ansamycin"
    An anticancer drug that belongs to the family of drugs called antineoplastic antibiotics.
  antagonist: (an-TA-guh-nist)
    Pronunciation of dictionary term "antagonist"
    In medicine, a substance that stops the action or effect of another substance. For example, a drug that blocks the stimulating effect of estrogen on a tumor cell is called an estrogen receptor antagonist.
  antenatal: (AN-tee-NAY-tul)
    Pronunciation of dictionary term "antenatal"
    Having to do with the time a female is pregnant, before birth occurs. Also called prenatal.
  anterior: (an-TEER-ee-er)
    Pronunciation of dictionary term "anterior"
    In human anatomy, has to do with the front of a structure, or a structure found toward the front of the body.
  anterior mediastinotomy: (an-TEER-ee-er MEE-dee-A-stih-NAH-toh-mee)
    Pronunciation of dictionary term "anterior mediastinotomy"
    A procedure in which a tube is inserted into the chest to view the tissues and organs in the area between the lungs and between the breastbone and heart. The tube is inserted through an incision next to the breastbone. This procedure is usually used to get a tissue sample from the lymph nodes on the left side of the chest. Also called Chamberlain procedure.
    Mediastinoscopy. A mediastinoscope is inserted into the chest through an incision above the breastbone to look for abnormal areas between the lungs. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a cutting tool. Tissue samples may be taken from lymph nodes on the right side of the chest and checked under a microscope for signs of cancer. In an anterior mediastinotomy (Chamberlain procedure), the incision is made beside the breastbone to remove tissue samples from the lymph nodes on the left side of the chest.
    Mediastinoscopy; shows mediastinoscope with light and lens inserted into the chest through an incision above the breastbone. Drawing shows right and left lungs, trachea, and lymph nodes. Inset shows anterior mediastinotomy (Chamberlain procedure) with incision beside the breastbone.
  anterior mediastinum: (an-TEER-ee-er MEE-dee-uh-STY-num)
    Pronunciation of dictionary term "anterior mediastinum"
    The area in the front part of the chest between the lungs. Also called prevascular space.
  anterior pelvic exenteration: (an-TEER-ee-er PEL-vik eg-ZEN-teh-RAY-shun)
    Pronunciation of dictionary term "anterior pelvic exenteration"
    Surgery to remove the urethra, lower part of the ureters, uterus, cervix, vagina, and bladder.
  anterior urethral cancer: (an-TEER-ee-er yoo-REE-thrul KAN-ser)
    Pronunciation of dictionary term "anterior urethral cancer"
    A disease in which malignant (cancer) cells are found in the part of the urethra (the tube through which urine leaves the body) that is closest to the outside of the body.
  anthracenedione: (AN-thruh-seen-DY-one)
    Pronunciation of dictionary term "anthracenedione"
    An anticancer drug that belongs to the family of drugs called anticancer antibiotics.
  anthracycline: (AN-thruh-SY-klin)
    Pronunciation of dictionary term "anthracycline"
    A type of antibiotic that comes from certain types of Streptomyces bacteria. Anthracyclines are used to treat many types of cancer. Anthracyclines damage the DNA in cancer cells, causing them to die. Daunorubicin, doxorubicin, and epirubicin are anthracyclines.
  anthraquinone: (AN-thruh-kwih-NONE)
    Pronunciation of dictionary term "anthraquinone"
    A type of anticancer drug.
  anti-CCR2 monoclonal antibody MLN1202: (AN-tee … MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "anti-CCR2 monoclonal antibody MLN1202"
    A substance being studied as a treatment for atherosclerosis (a build-up of fat in the arteries). It is also being studied in the treatment of cancers that spread to the bone. Anti-CCR2 monoclonal antibody MLN1202 binds to a protein called CCR2, which is found on the surface of certain bone cells, white blood cells, and cancer cells. Anti-CCR2 monoclonal antibody MLN1202 blocks the action of a substance that is involved in keeping healthy bone mass. It may help keep the cancer cells from spreading to and growing in the bone. It is a type of monoclonal antibody. Also called MLN1202.
  anti-CD19 immunotoxin: (AN-tee … IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "anti-CD19 immunotoxin"
    A monoclonal antibody linked to a toxic substance. It is being studied in the treatment of some types of B-cell cancer. Anti-CD19 immunotoxin is made in the laboratory. It binds to CD19, a protein on the surface of normal B cells and B-cell tumors, and kills the cells.
  anti-CD22 immunotoxin: (AN-tee … IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "anti-CD22 immunotoxin"
    A monoclonal antibody linked to a toxic substance. It is being studied in the treatment of some types of B-cell cancer. Anti-CD22 immunotoxin is made in the laboratory. It binds to CD22, a protein on the surface of normal B cells and B-cell tumors, and kills the cells.
  anti-CD22 immunotoxin CAT-8015: (AN-tee … IH-myoo-noh-TOK-sin …)
    Pronunciation of dictionary term "anti-CD22 immunotoxin CAT-8015"
    A drug used to treat adults with hairy cell leukemia that came back or did not get better with at least two other systemic therapies, including treatment with a purine nucleoside analog (a type of anticancer drug). Anti-CD22 immunotoxin CAT-8015 contains a monoclonal antibody that binds to a protein called CD22, which is found on B cells (a type of white blood cell) and some types of leukemia cells. It also contains a bacterial toxin called PE38, which may help kill cancer cells. Anti-CD22 immunotoxin CAT-8015 is a type of immunotoxin. Also called CAT-8015, Lumoxiti, and moxetumomab pasudotox.
    More Information
    - Moxetumomab Pasudotox-tdfk
  anti-CD38 monoclonal antibody: (AN-tee … MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "anti-CD38 monoclonal antibody"
    A substance that binds to a protein called CD38, which is found on some types of blood cells and in high levels on some cancer cells, including myeloma cells. Anti-CD38 monoclonal antibody may block the CD38 protein and help the immune system kill cancer cells. Some anti-CD38 monoclonal antibodies are being used to treat multiple myeloma. They are also being studied in the treatment of other types of cancer.
  anti-CD45 monoclonal antibody: (AN-tee … MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "anti-CD45 monoclonal antibody"
    A substance being studied in the treatment of some types of leukemia and lymphoma. Anti-CD45 monoclonal antibody binds to a protein called CD45, which is found on most types of blood cells and some types of leukemia and lymphoma cells. Anti-CD45 monoclonal antibody may help the immune system kill cancer cells. It is a type of monoclonal antibody.
  anti-CEA antibody: (AN-tee ... AN-tee-BAH-dee)
    Pronunciation of dictionary term "anti-CEA antibody"
    An antibody against carcinoembryonic antigen (CEA), a protein present on certain types of cancer cells.
  anti-EpCAM-Pseudomonas-exotoxin fusion protein: (AN-tee ... SOO-doh-MOH-nus-EK-soh-TOK-sin FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "anti-EpCAM-Pseudomonas-exotoxin fusion protein"
    A substance being studied in the treatment of certain types of head and neck cancer. Anti-EpCAM-Pseudomonas-exotoxin fusion protein is made by linking a monoclonal antibody fragment to a toxic protein that may kill cancer cells. It binds to EpCAM (a protein on the surface of epithelial cells and some types of cancer cells). Also called Proxinium and VB4-845.
  anti-GD2 therapy: (AN-tee-… THAYR-uh-pee)
    Pronunciation of dictionary term "anti-GD2 therapy"
    A type of treatment that helps the body’s immune system recognize and destroy cancer cells that have GD2 on their surface. GD2 is an antigen that is found in high levels on some types of cancer cells, such as neuroblastoma cells. Anti-GD2 monoclonal antibodies bind to GD2 on the cancer cells, which causes them to die. Some anti-GD2 monoclonal antibodies are being used in the treatment of neuroblastoma.
  anti-HGF monoclonal antibody AMG 102: (AN-tee … MAH-noh-KLOH-nul AN-tee-BAH-dee ...)
    Pronunciation of dictionary term "anti-HGF monoclonal antibody AMG 102"
    A substance being studied in the treatment of cancer. It binds to a protein called hepatocyte growth factor (HGF), which may cause cancer cells to grow. Blocking this may cause cancer cells to die. Anti-HGF monoclonal antibody AMG 102 is a type of monoclonal antibody. Also called AMG 102.
  anti-idiotype vaccine: (AN-tee-IH-dee-oh-TIPE vak-SEEN)
    Pronunciation of dictionary term "anti-idiotype vaccine"
    A vaccine made of antibodies that see other antibodies as the antigen and bind to it. Anti-idiotype vaccines can stimulate the body to produce antibodies against tumor cells.
  anti-IGF1R recombinant monoclonal antibody MK-0646: (AN-tee … ree-KOM-bih-nunt MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "anti-IGF1R recombinant monoclonal antibody MK-0646"
    A substance being studied in the treatment of many types of cancer. Anti-IGF1R recombinant monoclonal antibody MK-0646 binds to a protein called insulin-like growth factor receptor (IGFR) on the surface of cells. This may prevent the cells from growing when IGF is present. It may also kill cancer cells. Anti-IGF1R recombinant monoclonal antibody MK-0646 is a type of monoclonal antibody. Also called MK-0646.
  anti-IL-6 chimeric monoclonal antibody: (AN-tee ... ky-MEER-ik MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "anti-IL-6 chimeric monoclonal antibody"
    A drug used to treat a rare condition called multicentric Castleman disease in patients who do not have HIV or human herpesvirus 8. It is also being studied in the treatment of some types of cancer and other conditions. Anti-IL-6 chimeric monoclonal antibody binds to a protein called interleukin-6 (IL-6), which is made by some white blood cells and other cells in the body. Anti-IL-6 chimeric monoclonal antibody may help reduce inflammation and stop the growth of cancer cells or abnormal blood cells. It is a type of monoclonal antibody. Also called cCLB8, CNTO 328, siltuximab, and Sylvant.
    More Information
    - Siltuximab (https://www.cancer.gov/about-cancer/treatment/drugs/siltuximab)
  anti-inflammatory: (AN-tee-in-FLA-muh-TOR-ee)
    Pronunciation of dictionary term "anti-inflammatory"
    Having to do with reducing inflammation.
  anti-inflammatory agent: (AN-tee-in-FLA-muh-TOR-ee AY-jent)
    Pronunciation of dictionary term "anti-inflammatory agent"
    A drug or substance that reduces inflammation (redness, swelling, and pain) in the body. Anti-inflammatory agents block certain substances in the body that cause inflammation. They are used to treat many different conditions. Some anti-inflammatory agents are being studied in the prevention and treatment of cancer.
  anti-mesothelin monoclonal antibody MORAb-009: (AN-tee-MEH-zoh-THEE-lin MAH-noh-KLOH-nul AN-tee-BAH-dee…)
    Pronunciation of dictionary term "anti-mesothelin monoclonal antibody MORAb-009"
    A substance being studied in the treatment of mesothelioma. Anti-mesothelin monoclonal antibody MORAb-009 binds to a protein called mesothelin, which is found on some cancer cells. Anti-mesothelin monoclonal antibody MORAb-009 may help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called amatuximab and MORAb-009.
  anti-Mullerian hormone: (AN-tee-myoo-LAYR-ee-un HOR-mone)
    Pronunciation of dictionary term "anti-Mullerian hormone"
    A hormone made by the ovaries in females and the testicles in males. Anti-Mullerian hormone helps to form the male and female reproductive organs. It also helps control other hormones that act on the ovaries to make the follicles and eggs grow during a woman’s menstrual cycle. Measuring the amount of anti-Mullerian hormone in the blood may help diagnose infertility and other conditions, such as polycystic ovarian syndrome, menopause, and certain types of ovarian tumors. It may also help determine the sex of an infant, when the sex is not clear. Also called AMH.
  anti-PDGFR alpha monoclonal antibody IMC-3G3: (AN-tee … AL-fuh MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "anti-PDGFR alpha monoclonal antibody IMC-3G3"
    A drug used with doxorubicin to treat soft tissue sarcoma that cannot be treated with radiation therapy or surgery. It is used in patients whose cancer has not already been treated with an anthracycline (a type of anticancer drug). It is also being studied in the treatment of other types of cancer. Anti-PDGFR alpha monoclonal antibody IMC-3G3 binds to a receptor for a protein called platelet-derived growth factor (PDGF), which is found on some types of cancer cells. Blocking this protein receptor may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. Anti-PDGFR alpha monoclonal antibody IMC-3G3 is a type of monoclonal antibody. Also called anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3, IMC-3G3, Lartruvo, and olaratumab.
    More Information
    - Olaratumab (https://www.cancer.gov/about-cancer/treatment/drugs/olaratumab)
  anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3: (AN-tee-PLAYT-let-deh-RIVED grothe FAK-ter reh-SEP-ter AL-fuh MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3"
    A drug used with doxorubicin to treat soft tissue sarcoma that cannot be treated with radiation therapy or surgery. It is used in patients whose cancer has not already been treated with an anthracycline (a type of anticancer drug). It is also being studied in the treatment of other types of cancer. Anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3 binds to a receptor for a protein called platelet-derived growth factor (PDGF), which is found on some types of cancer cells. Blocking this protein receptor may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. Anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3 is a type of monoclonal antibody. Also called anti-PDGFR alpha monoclonal antibody IMC-3G3, IMC-3G3, Lartruvo, and olaratumab.
    More Information
    - Olaratumab (https://www.cancer.gov/about-cancer/treatment/drugs/olaratumab)
  anti-seizure medication: (AN-tee-SEE-zher MEH-dih-KAY-shun)
    Pronunciation of dictionary term "anti-seizure medication"
    A type of drug that is used to prevent or treat seizures or convulsions by controlling abnormal electrical activity in the brain. Anti-seizure medications are used to treat epilepsy and other seizure disorders. They are also used to treat medical conditions, such as bipolar disorder, nerve pain, migraine headaches, fibromyalgia, and restless leg syndrome. There are many different types of anti-seizure medications. Also called anticonvulsant and antiepileptic.
  anti-TGF-beta monoclonal antibody GC1008: (AN-tee ... BAY-tuh MAH-noh-KLOH-nul AN-tee-BAH-dee ...)
    Pronunciation of dictionary term "anti-TGF-beta monoclonal antibody GC1008"
    A substance being studied in the treatment of breast cancer that has spread to other parts of the body. It is also being studied in the treatment of other cancers and conditions. Anti-TGF-beta monoclonal antibody GC1008 binds to a protein called transforming growth factor-beta (TGF-beta), which is found on some cancer cells. Anti-TGF-beta monoclonal antibody GC1008 may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. It is a type of monoclonal antibody and a type of antiangiogenesis agent. Also called fresolimumab and GC1008.
  anti-TRAIL R1-mAb: (AN-tee ...)
    Pronunciation of dictionary term "anti-TRAIL R1-mAb"
    A substance being studied in the treatment of some types of cancer. It binds to a protein called TRAIL R1 on the surface of some tumor cells. This may kill the tumor cells. Anti-TRAIL R1-mAb is a type of monoclonal antibody. Also called HGS-ETR1 and mapatumumab.
  anti-TRAIL R2 mAb HGS-ETR2: (AN-tee ...)
    Pronunciation of dictionary term "anti-TRAIL R2 mAb HGS-ETR2"
    A substance being studied in the treatment of some types of cancer. It binds to a protein called TRAIL-R2 on the surface of some tumor cells, which may kill the tumor cells. Anti-TRAIL R2 mAb HGS-ETR2 is a type of monoclonal antibody. Also called HGS-ETR2 and lexatumumab.
  anti-VEGFR monoclonal antibody: (AN-tee … MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "anti-VEGFR monoclonal antibody"
    A substance that binds to receptors for a protein called vascular endothelial growth factor (VEGF), which may be found on some types of cancer cells. This may prevent the growth of new blood vessels that tumors need to grow. There are different types of anti-VEGFR monoclonal antibodies being studied in the treatment of cancer. These substances are a type of antiangiogenesis agent and a type of monoclonal antibody.
  anti-VEGFR-2 fully human monoclonal antibody IMC-1121B: (AN-tee … ful-ee HYOO-mun MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "anti-VEGFR-2 fully human monoclonal antibody IMC-1121B"
    A drug that binds to the protein vascular endothelial growth factor (VEGF) to help keep new blood vessels from forming and is used to treat different types of cancer. It is used alone or with other drugs to treat certain types of non-small cell lung cancer, hepatocellular carcinoma (a type of liver cancer), colorectal cancer, stomach cancer, and gastroesophageal junction cancer. It is also being studied in the treatment of other types of cancer. Anti-VEGFR-2 fully human monoclonal antibody IMC-1121B may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody. Also called Cyramza, IMC-1121B, and ramucirumab.
    More Information
    - Ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
  antiandrogen: (AN-tee-AN-droh-jen)
    Pronunciation of dictionary term "antiandrogen"
    A substance that keeps androgens (male sex hormones) from binding to proteins called androgen receptors, which are found in normal prostate cells, some prostate cancer cells, and in cells of some other tissues. Preventing this binding blocks the effects of these hormones in the body. Treatment with antiandrogens may keep prostate cancer cells from growing. Examples of antiandrogens used to treat prostate cancer are apalutamide, bicalutamide, darolutamide, enzalutamide, flutamide, and nilutamide. Also called androgen receptor antagonist and androgen receptor blocker.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  antiandrogen therapy: (AN-tee-AN-droh-jen THAYR-uh-pee)
    Pronunciation of dictionary term "antiandrogen therapy"
    Treatment with drugs to block the action of androgens (male hormones) in the body. Androgens, such as testosterone, bind to proteins called androgen receptors, which are found in prostate cancer cells and in cells of some other tissues. Antiandrogen therapy keeps androgens from binding to these receptors and may keep cancer cells from growing. It is used to treat prostate cancer.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  antiangiogenesis: (AN-tee-AN-jee-oh-JEH-neh-sis)
    Pronunciation of dictionary term "antiangiogenesis"
    Prevention of the growth of new blood vessels.
    More Information
    - Angiogenesis Inhibitors (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/angiogenesis-inhibitors-fact-sheet)
  antiangiogenesis agent: (AN-tee-AN-jee-oh-JEH-neh-sis AY-jent)
    Pronunciation of dictionary term "antiangiogenesis agent"
    A drug or substance that keeps new blood vessels from forming. In cancer treatment, antiangiogenesis agents may prevent the growth of new blood vessels that tumors need to grow. Also called angiogenesis inhibitor.
    More Information
    - Angiogenesis Inhibitors (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/angiogenesis-inhibitors-fact-sheet)
  antiangiogenic: (AN-tee-AN-jee-oh-JEH-nik)
    Pronunciation of dictionary term "antiangiogenic"
    Having to do with reducing the growth of new blood vessels.
  antianxiety agent: (AN-tee-ang-ZY-eh-tee AY-jent)
    Pronunciation of dictionary term "antianxiety agent"
    A drug used to treat symptoms of anxiety, such as feelings of fear, dread, uneasiness, and muscle tightness, that may occur as a reaction to stress. Most antianxiety agents block the action of certain chemicals in the nervous system. Also called anxiolytic and anxiolytic agent.
  antiapoptotic: (AN-tee-A-pop-TAH-tik)
    Pronunciation of dictionary term "antiapoptotic"
    Something that prevents apoptosis. Apoptosis is a type of cell death in which a series of molecular steps in a cell leads to its death.
  antibacterial: (AN-tee-bak-TEER-ee-ul)
    Pronunciation of dictionary term "antibacterial"
    A substance that kills bacteria or stops them from growing and causing disease.
  antibiotic: (AN-tee-by-AH-tik)
    Pronunciation of dictionary term "antibiotic"
    A drug used to treat infections caused by bacteria and other microorganisms.
  antibody: (AN-tee-BAH-dee)
    Pronunciation of dictionary term "antibody"
    A protein made by plasma cells (a type of white blood cell) in response to an antigen (a substance that causes the body to make a specific immune response). Each antibody can bind to only one specific antigen. The purpose of this binding is to help destroy the antigen. Some antibodies destroy antigens directly. Others make it easier for white blood cells to destroy the antigen. An antibody is a type of immunoglobulin.
  antibody therapy: (AN-tee-BAH-dee THAYR-uh-pee)
    Pronunciation of dictionary term "antibody therapy"
    Treatment that uses antibodies to help the body fight cancer, infection, or other diseases. Antibodies are proteins made by the immune system that bind to specific markers on cells or tissues. Monoclonal antibodies are a type of antibody made in the laboratory that can be used in diagnosis or treatment. In cancer treatment, monoclonal antibodies may kill cancer cells directly, they may block development of tumor blood vessels, or they may help the immune system kill cancer cells.
  antibody-dependent cell-mediated cytotoxicity: (AN-tee-BAH-dee-deh-PEN-dent sel-MEE-dee-AY-ted SY-toh-tok-SIH-sih-tee)
    Pronunciation of dictionary term "antibody-dependent cell-mediated cytotoxicity"
    A type of immune reaction in which a target cell or microbe is coated with antibodies and killed by certain types of white blood cells. The white blood cells bind to the antibodies and release substances that kill the target cells or microbes. Also called ADCC and antibody-dependent cellular cytotoxicity.
  antibody-dependent cellular cytotoxicity: (AN-tee-BAH-dee-deh-PEN-dent SEL-yoo-ler SY-toh-tok-SIH-sih-tee)
    Pronunciation of dictionary term "antibody-dependent cellular cytotoxicity"
    A type of immune reaction in which a target cell or microbe is coated with antibodies and killed by certain types of white blood cells. The white blood cells bind to the antibodies and release substances that kill the target cells or microbes. Also called ADCC and antibody-dependent cell-mediated cytotoxicity.
  antibody-drug conjugate: (AN-tee-BAH-dee ... KON-jih-gut)
    Pronunciation of dictionary term "antibody-drug conjugate"
    A substance made up of a monoclonal antibody chemically linked to a drug. The monoclonal antibody binds to specific proteins or receptors found on certain types of cells, including cancer cells. The linked drug enters these cells and kills them without harming other cells. Some antibody-drug conjugates are used to treat cancer. Also called ADC.
  anticachexia: (AN-tee-kuh-KEK-see-uh)
    Pronunciation of dictionary term "anticachexia"
    Describes a drug or effect that works against cachexia (loss of body weight and muscle mass).
  anticancer antibiotic: (AN-tee-KAN-ser AN-tee-by-AH-tik)
    Pronunciation of dictionary term "anticancer antibiotic"
    A type of anticancer drug that blocks cell growth by interfering with DNA, the genetic material in cells. Also called antineoplastic antibiotic and antitumor antibiotic.
  anticancer therapy: (AN-tee-KAN-ser THAYR-uh-pee)
    Pronunciation of dictionary term "anticancer therapy"
    Treatment to stop or prevent cancer. Types of anticancer therapy include chemotherapy, radiation therapy, surgery, immunotherapy, and others.
    More Information
    - Cancer Treatment (https://www.cancer.gov/about-cancer/treatment)
  anticarcinogenic: (AN-tee-KAR-sih-noh-JEH-nik)
    Pronunciation of dictionary term "anticarcinogenic"
    Having to do with preventing or delaying the development of cancer.
  anticipatory nausea and vomiting: (an-TIH-suh-puh-TOR-ee NAW-zee-uh … VAH-mih-ting)
    Pronunciation of dictionary term "anticipatory nausea and vomiting"
    Nausea and vomiting that may occur before a chemotherapy treatment session begins in a patient who has had chemotherapy before. Anticipatory nausea and vomiting is caused by triggers, such as the sights, smells, or sounds of the treatment room. For example, a patient who smells an alcohol swab when starting chemotherapy may later become nauseous or vomit at the smell of an alcohol swab. The more chemotherapy sessions a patient has, the more likely it is that anticipatory nausea and vomiting will occur. Also called ANV.
    More Information
    - Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
  anticoagulant: (AN-tee-koh-A-gyuh-lunt)
    Pronunciation of dictionary term "anticoagulant"
    A substance that is used to prevent and treat blood clots in blood vessels and the heart. Also called blood thinner.
  anticonvulsant: (AN-tee-kun-VUL-sunt)
    Pronunciation of dictionary term "anticonvulsant"
    A type of drug that is used to prevent or treat seizures or convulsions by controlling abnormal electrical activity in the brain. Anticonvulsants are used to treat epilepsy and other seizure disorders. They are also used to treat medical conditions, such as bipolar disorder, nerve pain, migraine headaches, fibromyalgia, and restless leg syndrome. There are many different types of anticonvulsants. Also called anti-seizure medication and antiepileptic.
  antidepressant: (AN-tee-dee-PREH-sunt)
    Pronunciation of dictionary term "antidepressant"
    A drug used to treat depression.
  antidiarrheal: (AN-tee-dy-uh-REE-ul)
    Pronunciation of dictionary term "antidiarrheal"
    A substance used to treat diarrhea (frequent and watery bowel movements).
  antidiuretic hormone: (AN-tee-DY-yoo-REH-tik HOR-mone)
    Pronunciation of dictionary term "antidiuretic hormone"
    A hormone that helps blood vessels constrict and helps the kidneys control the amount of water and salt in the body. This helps control blood pressure and the amount of urine that is made. Antidiuretic hormone is made by a part of the brain called the hypothalamus and is secreted into the blood by the pituitary gland. Certain types of tumors may release high amounts of antidiuretic hormone, which can cause low levels of sodium in the blood and the body to retain water. Also called arginine vasopressin and vasopressin.
  antiemetic: (AN-tee-eh-MEH-tik)
    Pronunciation of dictionary term "antiemetic"
    A drug that prevents or reduces nausea and vomiting.
  antiepileptic: (AN-tee-EH-pih-LEP-tik)
    Pronunciation of dictionary term "antiepileptic"
    A type of drug that is used to prevent or treat seizures or convulsions by controlling abnormal electrical activity in the brain. Antiepileptics are used to treat epilepsy and other seizure disorders. They are also used to treat medical conditions, such as bipolar disorder, nerve pain, migraine headaches, fibromyalgia, and restless leg syndrome. There are many different types of antiepileptics. Also called anti-seizure medication and anticonvulsant.
  antiestrogen: (AN-tee-ES-truh-jin)
    Pronunciation of dictionary term "antiestrogen"
    A substance that keeps cells from making or using estrogen (a hormone that plays a role in female sex characteristics, the menstrual cycle, and pregnancy). Antiestrogens may stop some cancer cells from growing and are used to prevent and treat breast cancer. They are also being studied in the treatment of other types of cancer. An antiestrogen is a type of hormone antagonist. Also called estrogen blocker.
  antifibrinolytic agent: (AN-tee-fy-BRIH-noh-LIH-tik AY-jent)
    Pronunciation of dictionary term "antifibrinolytic agent"
    A type of drug that helps the blood clot. It prevents the breakdown of a protein called fibrin, which is the main protein in a blood clot. Antifibrinolytic agents may be used to help prevent or treat serious bleeding in patients who have certain conditions, such as hemophilia, very heavy menstrual bleeding, or some types of vascular tumors. They may also be used to help prevent or control bleeding during or after surgery or after a traumatic injury.
  antifolate: (AN-tee-FOH-layt)
    Pronunciation of dictionary term "antifolate"
    A type of drug that stops cells from using folic acid to make DNA and may kill cancer cells. Certain antifolates are used to treat some types of cancer and inflammatory conditions, such as rheumatoid arthritis. Also called folate antagonist and folic acid antagonist.
  antifungal: (AN-tee-FUN-gul)
    Pronunciation of dictionary term "antifungal"
    A drug that treats infections caused by fungi.
  antigen: (AN-tih-jen)
    Pronunciation of dictionary term "antigen"
    Any substance that causes the body to make an immune response against that substance. Antigens include toxins, chemicals, bacteria, viruses, or other substances that come from outside the body. Body tissues and cells, including cancer cells, also have antigens on them that can cause an immune response. These antigens can also be used as markers in laboratory tests to identify those tissues or cells.
  antigen-presenting cell: (AN-tih-jen-preh-ZEN-ting sel)
    Pronunciation of dictionary term "antigen-presenting cell"
    A type of immune cell that boosts immune responses by showing antigens on its surface to other cells of the immune system. An antigen-presenting cell is a type of phagocyte. Also called APC.
  antigen-presenting cell vaccine: (AN-tih-jen-preh-ZEN-ting sel vak-SEEN)
    Pronunciation of dictionary term "antigen-presenting cell vaccine"
    A vaccine made of antigens and antigen-presenting cells (APCs). APCs boost an immune response by presenting antigens on their surfaces to other cells of the immune system. Also called APC vaccine.
  antiglobulin test: (AN-tee-GLAH-byoo-lin ...)
    Pronunciation of dictionary term "antiglobulin test"
    A laboratory test to identify antibodies that can bind to the surface of red blood cells or platelets and destroy them. This test is used to diagnose certain blood disorders in which patients make antibodies to their own red blood cells or platelets. It is also used to determine blood type. Also called Coombs test.
  antihistamine: (AN-tee-HIS-tuh-meen)
    Pronunciation of dictionary term "antihistamine"
    A type of drug that blocks the action of histamines, which can cause fever, itching, sneezing, a runny nose, and watery eyes. Antihistamines are used to prevent fevers in patients receiving blood transfusions and to treat allergies, coughs, and colds.
  antihormone therapy: (AN-tee-HOR-mone THAYR-uh-pee)
    Pronunciation of dictionary term "antihormone therapy"
    Treatment with drugs, surgery, or radiation in order to block the production or action of a hormone. Antihormone therapy may be used in cancer treatment because certain hormones are able to stimulate the growth of some types of tumors.
  antihypertensive agent: (AN-tee-HY-per-TEN-siv AY-jent)
    Pronunciation of dictionary term "antihypertensive agent"
    A type of drug used to treat high blood pressure. There are many different types of antihypertensive agents, and they work in different ways to lower blood pressure. Some remove extra fluid and salt from the body. Others relax and widen the blood vessels or slow the heartbeat. A person may respond better and have fewer side effects with one drug than with another. Some patients need more than one antihypertensive agent to lower their blood pressure.
  antilymphocyte globulin: (AN-tee-LIM-foh-site GLAH-byoo-lin)
    Pronunciation of dictionary term "antilymphocyte globulin"
    Serum from blood that contains antibodies that bind to human T cells. Antilymphocyte globulin is given to a patient before a stem cell transplant to kill T cells and lower the risk of graft-versus-host disease (GVHD). It is also used to treat GVHD and after a kidney transplant to help keep the body from rejecting the kidney. Also called antithymocyte globulin.
  antimetabolite: (AN-tee-meh-TA-boh-lite)
    Pronunciation of dictionary term "antimetabolite"
    A drug that is very similar to natural chemicals in a normal biochemical reaction in cells but different enough to interfere with the normal division and functions of cells.
  antimicrobial: (AN-tee-my-KROH-bee-ul)
    Pronunciation of dictionary term "antimicrobial"
    A substance that kills microorganisms such as bacteria or mold, or stops them from growing and causing disease.
  antimicrotubule agent: (AN-tee-MY-kroh-TOO-byool AY-jent)
    Pronunciation of dictionary term "antimicrotubule agent"
    A type of drug that blocks cell growth by stopping mitosis (cell division). Antimicrotubule agents interfere with microtubules (cellular structures that help move chromosomes during mitosis). They are used to treat cancer.
  antimitotic agent: (AN-tee-my-TAH-tik AY-jent)
    Pronunciation of dictionary term "antimitotic agent"
    A type of drug that blocks cell growth by stopping mitosis (cell division). They are used to treat cancer. Also called mitotic inhibitor.
  antineoplastic: (AN-tee-NEE-oh-PLAS-tik)
    Pronunciation of dictionary term "antineoplastic"
    Blocking the formation of neoplasms (growths that may become cancer).
  antineoplastic antibiotic: (AN-tee-NEE-oh-PLAS-tik AN-tee-by-AH-tik)
    Pronunciation of dictionary term "antineoplastic antibiotic"
    A type of anticancer drug that blocks cell growth by interfering with DNA, the genetic material in cells. Also called anticancer antibiotic and antitumor antibiotic.
  antineoplaston: (AN-tee-NEE-oh-PLAS-ton)
    Pronunciation of dictionary term "antineoplaston"
    A substance isolated from normal human blood and urine that is being tested as a type of treatment for some tumors and AIDS.
    More Information
    - Antineoplastons
  antioncogene: (AN-tee-ON-koh-jeen)
    Pronunciation of dictionary term "antioncogene"
    A type of gene that makes a protein called a tumor suppressor protein that helps control cell growth. Mutations (changes in DNA) in antioncogenes may lead to cancer. Also called tumor suppressor gene.
    More Information
    - Tumor Suppressor Gene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Tumor-Suppressor-Gene)
  antioxidant: (AN-tee-OK-sih-dent)
    Pronunciation of dictionary term "antioxidant"
    A substance that protects cells from the damage caused by free radicals (unstable molecules made by the process of oxidation during normal metabolism). Free radicals may play a part in cancer, heart disease, stroke, and other diseases of aging. Antioxidants include beta-carotene, lycopene, vitamins A, C, and E, and other natural and manufactured substances.
    More Information
    - Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet)
  antiparasitic: (AN-tee-PAYR-uh-SIH-tik)
    Pronunciation of dictionary term "antiparasitic"
    A drug used to treat infections caused by bacteria and parasites. It is also used in the treatment of some cancers.
  antiprogestin: (AN-tee-proh-JES-tin)
    Pronunciation of dictionary term "antiprogestin"
    A substance that prevents cells from making or using progesterone (a hormone that plays a role in the menstrual cycle and pregnancy). Antiprogestins may stop some cancer cells from growing and they are being studied in the treatment of breast cancer. An antiprogestin is a type of hormone antagonist.
  antipsychotic: (AN-tee-sy-KAH-tik)
    Pronunciation of dictionary term "antipsychotic"
    A type of drug used to treat symptoms of psychosis. These include hallucinations (sights, sounds, smells, tastes, or touches that a person believes to be real but are not real), delusions (false beliefs), and dementia (loss of the ability to think, remember, learn, make decisions, and solve problems). Most antipsychotics block the action of certain chemicals in the nervous system. Also called antipsychotic agent and neuroleptic agent.
  antipsychotic agent: (AN-tee-sy-KAH-tik AY-jent)
    Pronunciation of dictionary term "antipsychotic agent"
    A type of drug used to treat symptoms of psychosis. These include hallucinations (sights, sounds, smells, tastes, or touches that a person believes to be real but are not real), delusions (false beliefs), and dementia (loss of the ability to think, remember, learn, make decisions, and solve problems). Most antipsychotic agents block the action of certain chemicals in the nervous system. Also called antipsychotic and neuroleptic agent.
  antiretroviral therapy: (AN-tee-REH-troh-VY-rul THAYR-uh-pee)
    Pronunciation of dictionary term "antiretroviral therapy"
    Treatment with drugs that inhibit the ability of the human immunodeficiency virus (HIV) or other types of retroviruses to multiply in the body.
  antisense agent: (AN-tee-sents AY-jent)
    Pronunciation of dictionary term "antisense agent"
    Small pieces of DNA or RNA that can bind to specific molecules of RNA. This blocks the ability of the RNA to make a protein or work in other ways. Antisense agents may be used to block the production of proteins needed for cell growth. They are being studied in the treatment of several types of cancer. Also called antisense oligonucleotide.
  antisense c-fos: (AN-tee-sents ...)
    Pronunciation of dictionary term "antisense c-fos"
    A substance that has been studied in the treatment of cancer and is being studied in the treatment of rheumatoid arthritis and certain skin conditions. It blocks the production of a protein called c-fos, which helps control cell growth. This may kill cancer cells that need c-fos to grow. It is a type of antisense oligonucleotide. Also called c-fos antisense oligonucleotide.
  antisense DNA: (AN-tee-sents …)
    Pronunciation of dictionary term "antisense DNA"
    Small pieces of DNA that can bind to specific molecules of RNA and block the cell’s ability to use the RNA to make a protein or work in other ways. Antisense DNA may be used to block the production of proteins needed for cell growth. It is being studied in the treatment of many types of cancer.
  antisense oligonucleotide: (AN-tee-sents AH-lih-goh-NOO-klee-oh-tide)
    Pronunciation of dictionary term "antisense oligonucleotide"
    Small pieces of DNA or RNA that can bind to specific molecules of RNA. This blocks the ability of the RNA to make a protein or work in other ways. Antisense oligonucleotides may be used to block the production of proteins needed for cell growth. They are being studied in the treatment of several types of cancer. Also called antisense agent.
  antisense oligonucleotide therapy: (AN-tee-sents AH-lih-goh-NOO-klee-oh-tide THAYR-uh-pee)
    Pronunciation of dictionary term "antisense oligonucleotide therapy"
    Treatment with antisense oligonucleotides. These are small pieces of DNA or RNA that can bind to specific molecules of RNA. This blocks the cell’s ability to use the RNA to make a protein or work in other ways. Antisense oligonucleotides are being studied in the treatment of many types of cancer. Also called antisense therapy.
  antisense RNA: (AN-tee-sents …)
    Pronunciation of dictionary term "antisense RNA"
    Small pieces of RNA that can bind to specific molecules of RNA and block the cell’s ability to use the RNA to make a protein or work in other ways. Antisense RNA may be used to block the production of proteins needed for cell growth. It is being studied in the treatment of many types of cancer.
  antisense therapy: (AN-tee-sents THAYR-uh-pee)
    Pronunciation of dictionary term "antisense therapy"
    Treatment with antisense oligonucleotides. These are small pieces of DNA or RNA that can bind to specific molecules of RNA. This blocks the cell’s ability to use the RNA to make a protein or work in other ways. Antisense oligonucleotides are being studied in the treatment of many types of cancer. Also called antisense oligonucleotide therapy.
  antisocial: (AN-tee-SOH-shul)
    Pronunciation of dictionary term "antisocial"
    Describes behavior that ignores the rights of others and the practices and laws of society.
  antithymocyte globulin: (AN-tee-THY-moh-site GLAH-byoo-lin)
    Pronunciation of dictionary term "antithymocyte globulin"
    Serum from blood that contains antibodies that bind to human T cells. Antithymocyte globulin is given to a patient before a stem cell transplant to kill T cells and lower the risk of graft-versus-host disease (GVHD). It is also used to treat GVHD and after a kidney transplant to help keep the body from rejecting the kidney. Also called antilymphocyte globulin.
  antituberculosis: (AN-tee-too-BER-kyoo-LOH-sis)
    Pronunciation of dictionary term "antituberculosis"
    Describes a drug or effect that works against tuberculosis (a contagious bacterial infection that usually affects the lungs).
  antitumor: (AN-tee-TOO-mer)
    Pronunciation of dictionary term "antitumor"
    Having to do with stopping abnormal cell growth.
  antitumor antibiotic: (AN-tee-TOO-mer AN-tee-by-AH-tik)
    Pronunciation of dictionary term "antitumor antibiotic"
    A type of anticancer drug that blocks cell growth by interfering with DNA, the genetic material in cells. Also called anticancer antibiotic and antineoplastic antibiotic.
  antiviral: (AN-tee-VY-rul)
    Pronunciation of dictionary term "antiviral"
    A drug used to treat infections caused by viruses.
  anus: (AY-nus)
    Pronunciation of dictionary term "anus"
    The opening of the rectum to the outside of the body.
    More Information
    - Anal Cancer (https://www.cancer.gov/types/anal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
  ANV: Nausea and vomiting that may occur before a chemotherapy treatment session begins in a patient who has had chemotherapy before. ANV is caused by triggers, such as the sights, smells, or sounds of the treatment room. For example, a patient who smells an alcohol swab when starting chemotherapy may later become nauseous or vomit at the smell of an alcohol swab. The more chemotherapy sessions a patient has, the more likely it is that ANV will occur. Also called anticipatory nausea and vomiting.
    More Information
    - Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
  anxiety: (ang-ZY-eh-tee)
    Pronunciation of dictionary term "anxiety"
    Feelings of fear, dread, and uneasiness that may occur as a reaction to stress. A person with anxiety may sweat, feel restless and tense, and have a rapid heart beat. Extreme anxiety that happens often over time may be a sign of an anxiety disorder.
    More Information
    - Adjustment to Cancer: Anxiety and Distress
  anxiety disorder: (ang-ZY-eh-tee dis-OR-der)
    Pronunciation of dictionary term "anxiety disorder"
    A condition in which a person has excessive worry and feelings of fear, dread, and uneasiness. Other symptoms may include sweating, restlessness, irritability, fatigue, poor concentration, trouble sleeping, trouble breathing, a fast heartbeat, and dizziness. The symptoms can get worse over time and affect a person’s day-to-day life. Anxiety disorders may be caused by a medical problem, a traumatic or stressful event, certain medicines, or other factors. There are many types of anxiety disorders, including generalized anxiety disorder, social anxiety disorder, panic disorder, post-traumatic stress disorder, and phobia-related disorders.
    More Information
    - Adjustment to Cancer: Anxiety and Distress
  anxiolysis: (ANG-zee-AH-lih-sis)
    Pronunciation of dictionary term "anxiolysis"
    A level of sedation in which a person is very relaxed and may be awake. The person is able to answer questions and follow instructions. Anxiolysis is caused by special drugs and is used to help relieve anxiety during certain medical or surgical procedures. Also called minimal sedation.
  anxiolytic: (ANG-zee-oh-LIH-tik)
    Pronunciation of dictionary term "anxiolytic"
    A drug used to treat symptoms of anxiety, such as feelings of fear, dread, uneasiness, and muscle tightness, that may occur as a reaction to stress. Most anxiolytics block the action of certain chemicals in the nervous system. Also called antianxiety agent and anxiolytic agent.
  anxiolytic agent: (ANG-zee-oh-LIH-tik AY-jent)
    Pronunciation of dictionary term "anxiolytic agent"
    A drug used to treat symptoms of anxiety, such as feelings of fear, dread, uneasiness, and muscle tightness, that may occur as a reaction to stress. Most anxiolytic agents block the action of certain chemicals in the nervous system. Also called antianxiety agent and anxiolytic.
  Anzemet: (AN-zeh-met)
    Pronunciation of dictionary term "Anzemet"
    A drug used to prevent nausea and vomiting caused by chemotherapy. It is also used to prevent nausea and vomiting after surgery. Anzemet blocks the action of the chemical serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. It is a type of serotonin receptor antagonist and a type of antiemetic. Also called dolasetron mesylate.
  aorta: (ay-OR-tuh)
    Pronunciation of dictionary term "aorta"
    The largest artery in the body. It carries oxygen-rich blood away from the heart to vessels that reach the rest of the body.
  aortocoronary bypass: (ay-OR-toh-KOR-uh-NAYR-ee BY-pass)
    Pronunciation of dictionary term "aortocoronary bypass"
    Surgery in which a healthy blood vessel taken from another part of the body is used to make a new path for blood around a blocked artery leading to the heart. This restores the flow of oxygen and nutrients to the heart. Also called CABG and coronary artery bypass grafting.
  AP23573: A substance being studied in the treatment of soft tissue and bone cancers. It is also being studied in the treatment of other solid tumors and hematologic cancer. AP23573 stops cells from dividing and may cause cancer cells to die. It is a type of mTOR inhibitor. Also called ridaforolimus.
  AP5346: A substance being studied in the treatment of head and neck cancer. It may kill cancer cells by carrying an anticancer drug into the tumor. It is a type of platinum compound.
  apalutamide: (A-puh-LOO-tuh-mide)
    Pronunciation of dictionary term "apalutamide"
    A drug used to treat prostate cancer that has spread to other parts of the body and is castration sensitive (has responded to treatments that lower testosterone levels) and prostate cancer that has not spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). Apalutamide binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Apalutamide blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called Erleada.
    More Information
    - Apalutamide (https://www.cancer.gov/about-cancer/treatment/drugs/apalutamide)
  APC: A type of immune cell that boosts immune responses by showing antigens on its surface to other cells of the immune system. An APC is a type of phagocyte. Also called antigen-presenting cell.
  APC 8015: A vaccine used to treat prostate cancer that has spread to other parts of the body. It is used in patients who have few or no symptoms and whose cancer is castration resistant (has not responded to treatments that lower testosterone levels). APC 8015 is made from a patient’s immune cells that have been treated in the laboratory with GM-CSF (a type of growth factor) and a protein found on prostate cancer cells. APC 8015 may help the immune system kill prostate cancer cells. It is a type of autologous cellular immunotherapy and a type of dendritic cell vaccine. Also called Provenge and sipuleucel-T.
    More Information
    - Sipuleucel-T (https://www.cancer.gov/about-cancer/treatment/drugs/sipuleucel-T)
  APC vaccine: (… vak-SEEN)
    Pronunciation of dictionary term "APC vaccine"
    A vaccine made of antigens and antigen-presenting cells (APCs). APCs boost an immune response by presenting antigens on their surfaces to other cells of the immune system. Also called antigen-presenting cell vaccine.
  APC8015F: A vaccine made from immune system cells taken from a patient with prostate cancer and frozen for future use. The cells are treated in the laboratory with a growth factor attached to a protein called prostatic-acid phosphatase (PAP), which is found on prostate cancer cells. When APC8015F is injected into the patient, it may cause T cells (a type of white blood cell) to kill tumor cells that have PAP on them.
  apheresis: (a-feh-REE-sis)
    Pronunciation of dictionary term "apheresis"
    A process in which a machine removes blood stem cells or other parts of the blood from a person’s bloodstream then returns the rest to the body. During apheresis, blood flows through a catheter inserted into a large vein in a person’s arm or chest into a machine that separates and removes stem cells or other types of blood cells (such as platelets, white blood cells, or red blood cells), or plasma (the liquid part of the blood) from the blood. The rest of the blood is then returned to the body through the catheter. Apheresis may be done to collect blood stem cells before a stem cell transplant or to remove abnormal blood cells or proteins from the blood. It may be used to treat certain types of blood disorders, blood cancer, autoimmune disorders, or other conditions. Also called pheresis.
    Apheresis. A procedure that uses a special machine to collect blood stem cells or other parts of the blood from a person's bloodstream. The rest of the blood is then returned to the body.
    Apheresis; drawing of stem cells being collected from a person's bloodstream using an apheresis machine. Blood is removed from a vein in the person's arm and flows through the machine where the stem cells are removed. The rest of the blood is returned to the person through a vein in the other arm.
  API: The main ingredient in a medicine that causes the desired effect of the medicine. Some medicines contain more than one API that act in different ways in the body. Also called active pharmaceutical ingredient, drug substance, and pharmacologic substance.
  Apidra: (uh-PEE-druh)
    Pronunciation of dictionary term "Apidra"
    A drug used to control the amount of sugar in the blood of patients with diabetes mellitus. It is a form of the hormone insulin that is made in the laboratory. Apidra gets into the blood faster than insulin when it is injected under the skin before or shortly after a meal. It is a type of therapeutic insulin. Also called insulin glulisine.
  APL: An aggressive (fast-growing) type of acute myeloid leukemia in which there are too many immature blood-forming cells in the blood and bone marrow. It is usually marked by an exchange of parts of chromosomes 15 and 17. Also called acute promyelocytic leukemia and promyelocytic leukemia.
  aplastic anemia: (AY-PLAS-tik uh-NEE-mee-uh)
    Pronunciation of dictionary term "aplastic anemia"
    A condition in which the bone marrow is unable to produce blood cells.
  aplidine: (AP-lih-deen)
    Pronunciation of dictionary term "aplidine"
    A substance that is being studied in the treatment of cancer. It is obtained from a marine organism.
  APN: A registered nurse who has additional education and training in how to diagnose and treat disease. APNs are licensed at the state level and certified by national nursing organizations. In cancer care, an APN may manage the primary care of patients and their families, based on a practice agreement with a doctor. Also called advanced practice nurse, NP, and nurse practitioner.
  Apo-2L: (AY-poh …)
    Pronunciation of dictionary term "Apo-2L"
    A cell protein that can attach to certain molecules in some cancer cells and may kill the cells. Apo-2L is being studied in the treatment of cancer. Also called TNF-related apoptosis-inducing ligand, TRAIL, and tumor necrosis factor-related apoptosis-inducing ligand.
  apocrine gland: (A-poh-krin ...)
    Pronunciation of dictionary term "apocrine gland"
    A type of gland that is found in the skin, breast, eyelid, and ear. Apocrine glands in the breast secrete fat droplets into breast milk and those in the ear help form earwax. Apocrine glands in the skin and eyelid are sweat glands. Most apocrine glands in the skin are in the armpits, the groin, and the area around the nipples of the breast. Apocrine glands in the skin are scent glands, and their secretions usually have an odor. Another type of gland (eccrine gland or simple sweat gland) produces most sweat.
  apolizumab: (a-puh-LIZ-yoo-mab)
    Pronunciation of dictionary term "apolizumab"
    A substance being studied in the treatment of hematologic (blood) cancers. Apolizumab binds to a protein called ID10, which is found on the surface of some types of immune cells and cancer cells. It may help the immune system kill cancer cells. It is a type of monoclonal antibody.
  apoptosis: (A-pop-TOH-sis)
    Pronunciation of dictionary term "apoptosis"
    A type of cell death in which a series of molecular steps in a cell lead to its death. This is one method the body uses to get rid of unneeded or abnormal cells. The process of apoptosis may be blocked in cancer cells. Also called programmed cell death.
  appendage: (uh-PEN-dij)
    Pronunciation of dictionary term "appendage"
    In medicine, a body part (such as an arm or leg) that is attached to the main part of the body.
  appendectomy: (A-pen-DEK-toh-mee)
    Pronunciation of dictionary term "appendectomy"
    Surgery to remove the appendix (small finger-shaped pouch at the end of the first part of the large intestine).
  appendix: (uh-PEN-dix)
    Pronunciation of dictionary term "appendix"
    A small, fingerlike pouch that sticks out from the cecum (the first part of the large intestine near the end of the small intestine).
    The appendix is a small, fingerlike pouch that is attached to the end of the colon (large intestine).
    Drawing shows the stomach, small intestine, appendix, colon, and rectum.
  appetite: (A-peh-tite)
    Pronunciation of dictionary term "appetite"
    A desire to satisfy a physical or mental need, such as for food, sex, or adventure.
    More Information
    - Weight Changes, Malnutrition, and Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss)
  aprepitant: (uh-PREH-pih-tunt)
    Pronunciation of dictionary term "aprepitant"
    A drug used with other drugs to prevent nausea and vomiting caused by chemotherapy and nausea and vomiting after surgery. Aprepitant blocks the action of a certain chemical in the central nervous system that may trigger nausea and vomiting. Blocking this chemical may help lessen nausea and vomiting. Aprepitant is a type of antiemetic and a type of substance P/neurokinin 1 receptor antagonist. Also called Cinvanti and Emend.
    More Information
    - Aprepitant (https://www.cancer.gov/about-cancer/treatment/drugs/aprepitant)
  Aptivus: (AP-tih-vus)
    Pronunciation of dictionary term "Aptivus"
    A drug used with another drug, ritonavir, to treat patients who are infected with HIV (the virus that causes AIDS) and have been treated with other anti-HIV drugs. Aptivus blocks the HIV virus from making copies of itself. It is a type of anti-HIV agent and a type of protease inhibitor. Also called tipranavir sodium.
  aqueous: (A-kwee-us)
    Pronunciation of dictionary term "aqueous"
    Having to do with water.
  AR: A protein that binds male hormones called androgens. ARs are found inside the cells of male reproductive tissue, some other types of tissue, and some cancer cells. In prostate cancer, androgens bind to ARs inside the cancer cells, which causes the cancer cells to grow. Also called androgen receptor.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  AR negative: (... NEH-guh-tiv)
    Pronunciation of dictionary term "AR negative"
    Describes cells that do not have a protein that binds to androgens (male hormones). Cancer cells that are AR negative do not need androgens to grow. This means that they will keep growing when androgens are not present and do not stop growing when treatments that block androgens in the body are used. This can affect how the cancer is treated. Also called androgen receptor negative.
  AR positive: (... PAH-zih-tiv)
    Pronunciation of dictionary term "AR positive"
    Describes cells that have a protein that binds to androgens (male hormones). Cancer cells that are AR positive may need androgens to grow. These cells may stop growing or die when they are treated with substances that block the binding and actions of androgen hormones. Also called androgen receptor positive.
  ARA-C: A drug used with other drugs to treat adults and children with acute myeloid leukemia and to prevent and treat a type of leukemia that has spread to the meninges (the tissue that covers and protects the brain and spinal cord). It may also be used to treat acute lymphoblastic leukemia and blastic phase chronic myelogenous leukemia. It is also being studied in the treatment of other types of cancer. ARA-C stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called cytarabine.
    More Information
    - Cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
  Aranesp: (AYR-uh-nesp)
    Pronunciation of dictionary term "Aranesp"
    A drug used to treat anemia caused by chronic kidney disease and some types of chemotherapy. Aranesp is a form of erythropoietin (a substance naturally made by the kidneys) that is made in the laboratory. It helps the bone marrow make more red blood cells. Aranesp is a type of antianemic and a type of erythropoiesis-stimulating agent. Also called darbepoetin alfa.
    More Information
    - Darbepoetin Alfa (https://www.cancer.gov/about-cancer/treatment/drugs/darbepoetinalfa)
  arctigenin: (ARK-tih-JEH-nin)
    Pronunciation of dictionary term "arctigenin"
    A substance found in certain plants, including burdock. It has shown antiviral and anticancer effects. Arctigenin belongs to a group of substances called lignans.
  arctiin: (ARK-tine)
    Pronunciation of dictionary term "arctiin"
    A substance found in certain plants, including burdock. It has shown anticancer effects. Arctiin belongs to a group of substances called lignans.
  Aredia: (uh-REH-dee-uh)
    Pronunciation of dictionary term "Aredia"
    A drug used to treat hypercalcemia (high blood levels of calcium) caused by cancer and bone damage caused by multiple myeloma or by breast cancer that has spread to the bone. It is also used to treat Paget disease of the bone. It is also being studied in the treatment of other types of cancer. Aredia may help keep bone from breaking down and prevent the loss of calcium from the bones. It is a type of bisphosphonate. Also called pamidronate disodium.
    More Information
    - Pamidronate Disodium (https://www.cancer.gov/about-cancer/treatment/drugs/pamidronatedisodium)
  areola: (ayr-EE-oh-luh)
    Pronunciation of dictionary term "areola"
    The area of dark-colored skin on the breast that surrounds the nipple.
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
    Anatomy of the male breast. The nipple and areola are shown on the outside of the breast. The lymph nodes, fatty tissue, ducts, and other parts of the inside of the breast are also shown.
    Anatomy of the male breast; drawing shows the lymph nodes, nipple, areola, chest wall, ribs, muscle, fatty tissue, and ducts.
  arginine: (AR-jih-neen)
    Pronunciation of dictionary term "arginine"
    One of the twenty common amino acids (building blocks of proteins). Arginine is being studied as a nutritional supplement in the treatment and prevention of cancer and other conditions. Also called L-arginine.
  arginine butyrate: (AR-jih-neen BYOO-tuh-rayt)
    Pronunciation of dictionary term "arginine butyrate"
    A substance that is being studied in the treatment of cancer.
  arginine vasopressin: (AR-jih-neen VAY-zoh-PREH-sin)
    Pronunciation of dictionary term "arginine vasopressin"
    A hormone that helps blood vessels constrict and helps the kidneys control the amount of water and salt in the body. This helps control blood pressure and the amount of urine that is made. Arginine vasopressin is made by a part of the brain called the hypothalamus and is secreted into the blood by the pituitary gland. Certain types of tumors may release high amounts of arginine vasopressin, which can cause low levels of sodium in the blood and the body to retain water. Also called antidiuretic hormone and vasopressin.
  argon beam coagulator ablation: (AR-gon beem coh-A-gyuh-LAY-ter a-BLAY-shun)
    Pronunciation of dictionary term "argon beam coagulator ablation"
    A procedure that destroys tissue with an electrical current passed through a stream of argon gas to the tissue. It is used to treat endometriosis and other conditions, and to stop blood loss during surgery.
  Arimidex: (uh-RIH-mih-dex)
    Pronunciation of dictionary term "Arimidex"
    A drug used to treat certain types of breast cancer in postmenopausal women. It is also being studied in the treatment of other types of cancer. Arimidex lowers the amount of estrogen made by the body. This may stop the growth of cancer cells that need estrogen to grow. Arimidex is a type of nonsteroidal aromatase inhibitor. Also called anastrozole.
    More Information
    - Anastrozole (https://www.cancer.gov/about-cancer/treatment/drugs/anastrozole)
  Arixtra: (uh-RIK-struh)
    Pronunciation of dictionary term "Arixtra"
    A drug used to prevent blood clots from forming inside blood vessels in the leg. It is being studied in the prevention of blood clots in some cancer patients, including women having surgery for cancer of the reproductive tract. It is a type of anticoagulant. Also called fondaparinux sodium.
  ARMD: A condition in which there is a slow breakdown of cells in the center of the retina (the light-sensitive layers of nerve tissue at the back of the eye). This blocks vision in the center of the eye and can cause problems with activities such as reading and driving. ARMD is most often seen in people who are over the age of 50. Also called age-related macular degeneration, AMD, and macular degeneration.
  armodafinil: (ar-moh-DA-fih-nil)
    Pronunciation of dictionary term "armodafinil"
    A drug that is used to treat certain sleep disorders, such as narcolepsy. It makes patients feel more alert and awake. It is also being studied in the treatment of insomnia and fatigue in patients treated for cancer. Armodafinil acts in a part of the brain that controls sleep and wakefulness. It is a type of wakefulness-promoting agent. Also called Nuvigil.
  ARMS: A soft tissue tumor that is most common in older children and teenagers. It begins in embryonic muscle cells (cells that develop into muscles in the body). It can occur at many places in the body, but usually occurs in the trunk, arms, or legs. Also called alveolar rhabdomyosarcoma.
  Aromasin: (uh-ROH-muh-sin)
    Pronunciation of dictionary term "Aromasin"
    A drug used to treat postmenopausal women with advanced breast cancer or early-stage breast cancer that is estrogen receptor positive (ER+). It is used in patients whose cancer has already been treated with tamoxifen. It is also being studied in the treatment of other types of cancer. Aromasin lowers the amount of estrogen made by the body. This may stop the growth of cancer cells that need estrogen to grow. Aromasin is a type of aromatase inhibitor. Also called exemestane.
    More Information
    - Exemestane (https://www.cancer.gov/about-cancer/treatment/drugs/exemestane)
  aromatase inhibitor: (uh-ROH-muh-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "aromatase inhibitor"
    A drug that blocks the activity of an enzyme called aromatase, which the body uses to make estrogen in the ovaries and other tissues. Blocking aromatase lowers the amount of estrogen made by the body, which may stop the growth of cancer cells that need estrogen to grow. Aromatase inhibitors are used to treat some types of breast cancer or to keep it from coming back. They may also be used to help prevent breast cancer in some women who are at a high risk of developing it. Examples of aromatase inhibitors are anastrozole, letrozole, and exemestane. Aromatase inhibitors are a type of hormone therapy. Also called AI drug.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  aromatherapist: (uh-ROH-muh-THAYR-uh-pist)
    Pronunciation of dictionary term "aromatherapist"
    A person who practices a type of complementary medicine called aromatherapy. This therapy uses plant oils that give off strong, pleasant smells to promote relaxation and a sense of well-being. The plant oils are usually inhaled or put on the skin using wet cloths, baths, or massage.
  aromatherapy: (uh-ROH-muh-THAYR-uh-pee)
    Pronunciation of dictionary term "aromatherapy"
    A type of complementary and alternative medicine that uses plant oils that give off strong pleasant aromas (smells) to promote relaxation, a sense of well-being, and healing.
    More Information
    - Aromatherapy With Essential Oils
  aromatherapy infusion: (uh-ROH-muh-THAYR-uh-pee in-FYOO-zhun)
    Pronunciation of dictionary term "aromatherapy infusion"
    The process of heating (without boiling) a mixture of water and an essential oil (scented liquid taken from a plant) to release a pleasant aroma. Aromatherapy infusion may also refer to the process of heating an herb in liquid to release the essential oils. Inhaled oxygen scented by aromatherapy infusion is being studied as a complementary therapy (used in addition to standard treatments) to relieve pain and shorten recovery time in patients undergoing colonoscopy.
  aromatherapy massage: (uh-ROH-muh-THAYR-uh-pee muh-SAZH)
    Pronunciation of dictionary term "aromatherapy massage"
    A type of complementary and alternative medicine that uses rubbing and kneading of the skin with plant oils that give off strong, pleasant aromas (smells) to promote relaxation, a sense of well-being, and healing.
  aromatic: (AYR-oh-MA-tik)
    Pronunciation of dictionary term "aromatic"
    Having an odor, which often is pleasant or spicy.
  arousal: (uh-ROW-zul)
    Pronunciation of dictionary term "arousal"
    The state of being alert and ready to respond, or waking from sleep.
  Arranon: (AYR-rah-non)
    Pronunciation of dictionary term "Arranon"
    A drug used to treat adults and children aged 1 year and older with T-cell acute lymphoblastic leukemia and T-cell lymphoblastic lymphoma. It is used in patients whose cancer has not gotten better or has recurred (come back) after treatment with other anticancer drugs. Arranon stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called 506U78 and nelarabine.
    More Information
    - Nelarabine (https://www.cancer.gov/about-cancer/treatment/drugs/nelarabine)
  arrhenoblastoma: (uh-REE-noh-blas-TOH-muh)
    Pronunciation of dictionary term "arrhenoblastoma"
    A rare tumor that forms in the tissues that surround and support the ovaries. Arrhenoblastomas make a male sex hormone called testosterone. These tumors can cause the appearance of male physical features, such as facial hair, a deep voice, and other symptoms. Arrhenoblastomas may be benign (not cancer) or malignant (cancer). They tend to have a good prognosis if diagnosed and treated early. Arrhenoblastomas are a type of sex cord-stromal tumor. Also called androblastoma and Sertoli-Leydig cell tumor.
  arsenic: (ARS-nik)
    Pronunciation of dictionary term "arsenic"
    A poisonous chemical used to kill weeds and pests. Also used in cancer therapy.
    More Information
    - Arsenic (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/arsenic)
  arsenic trioxide: (AR-seh-nik try-OK-side)
    Pronunciation of dictionary term "arsenic trioxide"
    A drug used to treat acute promyelocytic leukemia that has a certain chromosome abnormality or a fusion gene called PML::RARA. It is used with tretinoin in some newly diagnosed adults. It is also used alone in patients whose cancer has not gotten better or has come back after treatment with other anticancer drugs. Arsenic trioxide is also being studied in the treatment of other types of cancer. Arsenic trioxide damages a fusion protein made by the PML::RARA fusion gene. This may help keep cancer cells from growing and may kill them. Also called Trisenox.
    More Information
    - Arsenic Trioxide (https://www.cancer.gov/about-cancer/treatment/drugs/arsenictrioxide)
  ART: A type of procedure used to treat infertility. The most common type of ART is in vitro fertilization (IVF), which involves removing eggs from a woman’s ovary and combining them with sperm in the laboratory to form embryos. The embryos are then either placed in a woman’s uterus or frozen for future use. ART sometimes uses donor eggs or sperm or may involve a surrogate or gestational carrier (a woman who carries and gives birth to a baby for a person who is not able to have children). Other types of ART include gamete intrafallopian transfer (GIFT) and zygote intrafallopian transfer (ZIFT), but these are used less often. Also called assisted reproductive technology.
  art therapy: (… THAYR-uh-pee)
    Pronunciation of dictionary term "art therapy"
    Treatment that uses the making of art and the response to art to improve one’s physical, mental, and emotional well-being. Art therapy is sometimes used together with psychotherapy (talk therapy).
  arterial embolization: (ar-TEER-ee-ul EM-boh-lih-ZAY-shun)
    Pronunciation of dictionary term "arterial embolization"
    A procedure in which the blood supply to a tumor or an abnormal area of tissue is blocked. During arterial embolization, a small incision (cut) is made in the inner thigh and a catheter (thin, flexible tube) is inserted and guided into an artery near the tumor or abnormal tissue. Once the catheter is in place, small particles made of tiny gelatin sponges or beads are injected. This blocks the artery and stops the flow of blood to the tumor or abnormal area of tissue. Arterial embolization is used to treat some types of liver cancer, kidney cancer, and neuroendocrine tumors. It may also be used to treat uterine fibroids, aneurysms, and other conditions. Also called TAE and transarterial embolization.
  arteriogram: (ar-TEER-ee-oh-gram)
    Pronunciation of dictionary term "arteriogram"
    An x-ray of arteries. The person receives an injection of a dye that outlines the vessels on the x-ray.
  arteriography: (ar-TEER-ee-AH-gruh-fee)
    Pronunciation of dictionary term "arteriography"
    A procedure to x-ray arteries. The arteries can be seen because of an injection of a dye that outlines the vessels on the x-ray.
  artery: (AR-tuh-ree)
    Pronunciation of dictionary term "artery"
    A blood vessel that carries blood from the heart to tissues and organs in the body.
  arthralgia: (ar-THRAL-juh)
    Pronunciation of dictionary term "arthralgia"
    Joint pain.
  arthritis: (ar-THRY-tis)
    Pronunciation of dictionary term "arthritis"
    A disease that causes inflammation and pain in the joints.
  artificial intelligence: (AR-tih-FIH-shul in-TEH-luh-jents)
    Pronunciation of dictionary term "artificial intelligence"
    The ability of a computer to perform functions that are usually thought of as intelligent human behavior, such as learning, reasoning, problem solving, and decision making. Artificial intelligence uses computer programs that analyze very large amounts of information to learn how to help make decisions or predictions. In medicine, the use of artificial intelligence may help improve cancer screening and diagnosis and plan treatment. It may also be used in research and in drug discovery and development. Also called AI.
  artificial nutrition and hydration: (AR-tih-FIH-shul noo-TRIH-shun … hy-DRAY-shun)
    Pronunciation of dictionary term "artificial nutrition and hydration"
    A form of nutrition that is given as liquids, including liquid foods, through a tube inserted into a vein, under the skin, or into the stomach or small intestine. Artificial nutrition and hydration is given when a person is not able to eat or drink by mouth or has a disease or condition that affects their ability to absorb nutrients through the digestive system. For people near death, it does not help prolong life and is usually not given because it can cause severe problems, such as infection, aspiration (the breathing in of fluid or food into the lungs), diarrhea, and cramping. Also called ANH.
  artificial pacemaker: (AR-tih-FIH-shul PAYS-may-ker)
    Pronunciation of dictionary term "artificial pacemaker"
    An electronic device that is implanted in the body to monitor heart rate and rhythm. It gives the heart electrical stimulation when it does not beat normally. It runs on batteries and has long, thin wires that connect it to the heart. Also called cardiac pacemaker and pacemaker.
  Arzerra: (ar-ZAYR-uh)
    Pronunciation of dictionary term "Arzerra"
    A drug used alone or with other drugs to treat certain types of chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. Arzerra binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of leukemia and lymphoma cells. Arzerra may block CD20 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called HuMax-CD20 and ofatumumab.
    More Information
    - Ofatumumab (https://www.cancer.gov/about-cancer/treatment/drugs/ofatumumab)
  arzoxifene hydrochloride: (ar-ZOK-sih-feen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "arzoxifene hydrochloride"
    A substance being studied in the treatment of osteoporosis and breast cancer. Arzoxifene hydrochloride is made in the laboratory and binds to estrogen receptors in the body. It is a type of selective estrogen receptor modulator (SERM). Also called LY353381 hydrochloride.
  asbestos: (as-BES-tus)
    Pronunciation of dictionary term "asbestos"
    A group of minerals that take the form of tiny fibers. Asbestos has been used as insulation against heat and fire in buildings. Loose asbestos fibers breathed into the lungs can cause several serious diseases, including lung cancer and malignant mesothelioma (cancer found in the lining of the lungs, chest, or abdomen). Asbestos that is swallowed may cause cancer of the gastrointestinal tract.
    More Information
    - Asbestos Exposure and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/asbestos/asbestos-fact-sheet)
  asbestosis: (as-bes-TOH-sis)
    Pronunciation of dictionary term "asbestosis"
    A lung disease caused by breathing in particles of asbestos (a group of minerals that take the form of tiny fibers). Symptoms include coughing, trouble breathing, and chest pain caused by scarring and permanent damage to lung tissue. Asbestosis increases the risk of lung cancer and malignant mesothelioma (cancer found in the lining of the lungs, chest, or abdomen).
  ASC-H: A finding of abnormal cells in a Pap test. It means there are abnormal squamous cells in the tissue that lines the outer part of the cervix. ASC-H may be a sign of a high-grade squamous intraepithelial lesion (HSIL), which may become cervical cancer if untreated. More testing may be needed. Also called atypical squamous cells, cannot exclude a high-grade lesion.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  ASC-US: A finding of abnormal cells in the tissue that lines the outer part of the cervix. ASC-US is the most common abnormal finding in a Pap test. It may be a sign of infection with certain types of human papillomavirus (HPV) or other types of infection, such as a yeast infection. It may also be a sign of inflammation, low hormone levels (in menopausal women), or a benign (not cancer) growth, such as a cyst or polyp. More testing, such as an HPV test or another Pap test, may be needed. Also called ASCUS and atypical squamous cells of undetermined significance.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  asciminib hydrochloride: (as-KIH-mih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "asciminib hydrochloride"
    A drug used to treat adults with chronic phase chronic myelogenous leukemia that is Philadelphia chromosome positive. It is used in patients whose cancer has the T315I mutation, whose cancer is newly diagnosed, or whose cancer was treated with at least two other tyrosine kinase inhibitors. It is also being studied in the treatment of other types of cancer. Asciminib hydrochloride blocks the BCR::ABL1 fusion protein, which may help keep cancer cells from growing and may kill them. Asciminib hydrochloride is a type of tyrosine kinase inhibitor. Also called Scemblix.
    More Information
    - Asciminib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/asciminib-hydrochloride)
  ascites: (uh-SY-teez)
    Pronunciation of dictionary term "ascites"
    Abnormal buildup of fluid in the abdomen that may cause swelling. In late-stage cancer, tumor cells may be found in the fluid in the abdomen. Ascites also occurs in patients with liver disease.
    More Information
    - Ascites and Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/ascites)
    Ascites is as an abnormal buildup of fluid in the abdomen that may cause swelling. It occurs when fluid builds up between the two layers of tissue called the peritoneum. The peritoneum lines the abdominal wall and covers most of the organs in the abdomen.
    Drawing shows a cross section of the peritoneal cavity with ascites. Also shown are the peritoneum, liver, stomach, pancreas, large intestine, greater omentum, small intestine, ovary, uterus, bladder, and rectum.
  ascorbic acid: (uh-SKOR-bik A-sid)
    Pronunciation of dictionary term "ascorbic acid"
    A nutrient that the body needs in small amounts to function and stay healthy. Ascorbic acid helps fight infections, heal wounds, and keep tissues healthy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). Ascorbic acid is found in all fruits and vegetables, especially citrus fruits, strawberries, cantaloupe, green peppers, tomatoes, broccoli, leafy greens, and potatoes. It is water-soluble (can dissolve in water) and must be taken in every day. Ascorbic acid is being studied in the prevention and treatment of some types of cancer. Also called vitamin C.
    More Information
    - Intravenous Vitamin C
    - Cancer Prevention Overview
  ASCUS: A finding of abnormal cells in the tissue that lines the outer part of the cervix. ASCUS is the most common abnormal finding in a Pap test. It may be a sign of infection with certain types of human papillomavirus (HPV) or other types of infection, such as a yeast infection. It may also be a sign of inflammation, low hormone levels (in menopausal women), or a benign (not cancer) growth, such as a cyst or polyp. More testing, such as an HPV test or another Pap test, may be needed. Also called ASC-US and atypical squamous cells of undetermined significance.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  aseptic necrosis: (ay-SEP-tik neh-KROH-sis)
    Pronunciation of dictionary term "aseptic necrosis"
    A condition in which there is a loss of blood flow to bone tissue, which causes the bone to die. It is most common in the hips, knees, shoulders, and ankles. It may be caused by long-term use of steroid medicines, alcohol abuse, joint injuries, and certain diseases, such as cancer and arthritis. It may also occur at some point in time after cancer treatment that included methotrexate, bisphosphonates, or corticosteroids. Also called avascular necrosis, ischemic necrosis, and osteonecrosis.
  Ashkenazi Jews: (ASH-keh-NAH-zee jooz)
    Pronunciation of dictionary term "Ashkenazi Jews"
    One of two major ancestral groups of Jewish people whose ancestors lived in France and Central and Eastern Europe, including Germany, Poland, and Russia. The other group is called Sephardic Jews and includes those whose ancestors lived in Spain, Portugal, North Africa, and the Middle East. Most Jewish people living in the United States are of Ashkenazi descent.
  ASM: A rare condition in which too many mast cells (a type of white blood cell) build up in certain tissues and organs in the body, including the bone marrow, lymph nodes, bone, liver, spleen, and small intestine. ASM may get worse quickly and cause severe symptoms and organ damage. Sometimes, it may become mast cell leukemia (a very rare type of leukemia). ASM usually occurs in adults. Also called aggressive systemic mastocytosis.
  asparaginase: (as-PAYR-uh-jih-NAYS)
    Pronunciation of dictionary term "asparaginase"
    A drug that is used to treat acute lymphoblastic leukemia (ALL) and is being studied in the treatment of some other types of cancer. It is an enzyme taken from the bacterium Escherichia coli (E. coli). It breaks down the amino acid asparagine and may block the growth of tumor cells that need asparagine to grow. Also called Elspar and L-asparaginase.
  asparaginase Erwinia chrysanthemi: (as-PAYR-uh-jih-NAYS er-WIH-nee-uh krih-SAN-theh-my)
    Pronunciation of dictionary term "asparaginase Erwinia chrysanthemi"
    A drug that is made up of the enzyme asparaginase, which comes from the bacterium Erwinia chrysanthemi, and is used with other drugs under the brand name Erwinaze to treat acute lymphoblastic leukemia (ALL) and under the brand name Rylaze to treat adults and children aged 1 month or older with ALL or lymphoblastic lymphoma. It is used in people who cannot take asparaginase that comes from the bacterium E. coli. It is also being studied in the treatment of other types of cancer. Asparaginase Erwinia chrysanthemi breaks down the amino acid asparagine and may stop the growth of cancer cells that need asparagine to grow. It may also kill cancer cells. Asparaginase Erwinia chrysanthemi is a type of protein synthesis inhibitor.
    More Information
    - Asparaginase Erwinia Chrysanthemi (https://www.cancer.gov/about-cancer/treatment/drugs/asparaginase-erwinia-chrysanthemi)
  Asparlas: (AS-par-las)
    Pronunciation of dictionary term "Asparlas"
    A drug used with other drugs to treat acute lymphoblastic leukemia in children and young adults aged 1 month to 21 years. It is also being studied in the treatment of other types of cancer. Asparlas is made up of the enzyme L-asparaginase that is linked to a substance called SC-PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. Asparlas is a type of protein synthesis inhibitor. Also called calaspargase pegol, EZN-2285, and SC-PEG E. coli L-asparaginase.
    More Information
    - Calaspargase Pegol-mknl (https://www.cancer.gov/about-cancer/treatment/drugs/calaspargasepegol-mknl)
  aspartate transaminase: (as-PAR-tayt tranz-A-mih-nays)
    Pronunciation of dictionary term "aspartate transaminase"
    An enzyme found in the liver, heart, and other tissues. A high level of aspartate transaminase released into the blood may be a sign of liver or heart damage, cancer, or other diseases. Also called serum glutamic-oxaloacetic transaminase and SGOT.
  aspergillosis: (AS-per-jih-LOH-sis)
    Pronunciation of dictionary term "aspergillosis"
    An infectious fungal disease that occurs most often in the skin, ears, nasal sinuses, and lungs of people with suppressed immune systems.
  Aspergillus: (AS-per-JIH-lus)
    Pronunciation of dictionary term "Aspergillus"
    Fungi commonly found in soil. Certain types of Aspergillus may cause disease, especially in people who have suppressed immune systems.
  aspirate: Aspirate (pronounced AS-pih-rit) refers to fluid, tissue, or other substance that is withdrawn from a body cavity, cyst, or tumor. Aspirate (pronounced AS-pih-rayt) refers to the act of withdrawing the fluid, tissue, or other substance through a needle. It also refers to the accidental breathing in of food or fluid into the lungs. This can cause serious problems, such as pneumonia and other lung problems.
  aspiration: (AS-pih-RAY-shun)
    Pronunciation of dictionary term "aspiration"
    Removal of fluid or tissue through a needle. Also, the accidental breathing in of food or fluid into the lungs.
  aspirin: (AS-pih-rin)
    Pronunciation of dictionary term "aspirin"
    A drug that reduces pain, fever, inflammation, and blood clotting. Aspirin belongs to the family of drugs called nonsteroidal anti-inflammatory agents. It is also being studied in cancer prevention.
    More Information
    - Can Taking Aspirin Help Prevent Cancer? (https://www.cancer.gov/about-cancer/causes-prevention/research/aspirin-cancer-risk)
    - Cancer Prevention Overview
  ASPS: A soft tissue tumor that is most common in older children and teenagers. It begins in the soft supporting tissue that connects and surrounds the organs and other tissues. ASPS usually occurs in the legs, but can also occur in the arms, hands, head, or neck. It can cause the growth of new blood vessels that help the tumor grow and spread. Also called alveolar soft part sarcoma.
  assay: (A-say)
    Pronunciation of dictionary term "assay"
    A laboratory test to find and measure the amount of a specific substance.
  assent process: (uh-SENT PRAH-ses)
    Pronunciation of dictionary term "assent process"
    A process that is required by law in which children or adolescents are given easy-to-understand information about a clinical trial to help them decide if they want to take part in the trial. The patient is given a chance to ask questions about what will happen during the trial, why it’s being done, and what they will be asked to do. Formal consent to enter the trial comes from the parent or guardian.
  assessment: (uh-SES-ment)
    Pronunciation of dictionary term "assessment"
    In health care, a process used to learn about a patient’s condition. This may include a complete medical history, medical tests, a physical exam, a test of learning skills, tests to find out if the patient is able to carry out the tasks of daily living, a mental health evaluation, and a review of social support and community resources available to the patient.
  asset: (A-set)
    Pronunciation of dictionary term "asset"
    Something that has financial value and that a person owns, benefits from, or has use of. Money, jewelry, artwork, investments, real estate, and cars are examples of assets.
  assisted reproductive technology: (uh-SIS-ted REE-proh-DUK-tiv tek-NAH-loh-jee)
    Pronunciation of dictionary term "assisted reproductive technology"
    A type of procedure used to treat infertility. The most common type of assisted reproductive technology is in vitro fertilization (IVF), which involves removing eggs from a woman’s ovary and combining them with sperm in the laboratory to form embryos. The embryos are then either placed in a woman’s uterus or frozen for future use. Assisted reproductive technology sometimes uses donor eggs or sperm or may involve a surrogate or gestational carrier (a woman who carries and gives birth to a baby for a person who is not able to have children). Other types of assisted reproductive technology include gamete intrafallopian transfer (GIFT) and zygote intrafallopian transfer (ZIFT), but these are used less often. Also called ART.
  assistive device: (uh-SIS-tiv dee-VISE)
    Pronunciation of dictionary term "assistive device"
    A tool that helps a person with a disability to do a certain task. Examples are a cane, wheelchair, scooter, walker, hearing aid, or special bed.
  assistive technology: (uh-SIS-tiv tek-NAH-loh-jee)
    Pronunciation of dictionary term "assistive technology"
    Any device or technology that helps a disabled person. Examples are special grips for holding utensils, computer screen monitors to help a person with low vision read more easily, computers controlled by talking, telephones that make the sound louder, and lifters to help a person rise out of a chair.
  asthenia: (as-THEE-nee-uh)
    Pronunciation of dictionary term "asthenia"
    Weakness; lack of energy and strength.
  asthma: (AZ-muh)
    Pronunciation of dictionary term "asthma"
    A chronic disease in which the bronchial airways in the lungs become narrowed and swollen, making it difficult to breathe. Symptoms include wheezing, coughing, tightness in the chest, shortness of breath, and rapid breathing. An asthma attack may be brought on by pet hair, dust, smoke, pollen, mold, exercise, cold air, or stress.
  astrocyte: (AS-troh-site)
    Pronunciation of dictionary term "astrocyte"
    A large, star-shaped cell that holds nerve cells in place and helps them develop and work the way they should. An astrocyte is a type of glial cell.
  astrocytoma: (AS-troh-sy-TOH-muh)
    Pronunciation of dictionary term "astrocytoma"
    A type of glioma that forms in star-shaped cells called astrocytes in the brain and spinal cord. Astrocytomas may be benign (not cancer) or malignant (cancer). They are grouped based on their grade, which is determined by how abnormal the tumor cells look under a microscope and how quickly the tumor is likely to grow, spread, and come back after treatment. Low-grade astrocytomas, such as pilocytic astrocytomas, tend to grow slowly and are more common in children. High-grade astrocytomas, such as glioblastoma, tend to grow and spread within the brain and spinal cord quickly and are more common in adults.
    More Information
    - Brain Tumors (https://www.cancer.gov/types/brain)
    Anatomy of the brain showing the cerebrum, ventricles (with cerebrospinal fluid shown in blue), cerebellum, brain stem (pons and medulla), and other parts of the brain.
    Anatomy of the brain; two-panel drawing showing the cerebrum, ventricles (fluid-filled spaces), cerebellum, brain stem (pons and medulla), and spinal cord. Also shown are the meninges and skull (left panel) and the choroid plexus, hypothalamus, pineal gland, pituitary gland, and optic nerve (right panel).
  asymmetry: (ay-SIH-meh-tree)
    Pronunciation of dictionary term "asymmetry"
    Lack or absence of balanced proportions between parts of a thing.
  asymptomatic: (AY-sim-toh-MA-tik)
    Pronunciation of dictionary term "asymptomatic"
    Having no signs or symptoms of disease.
  asymptomatic inflammatory prostatitis: (AY-sim-toh-MA-tik in-FLA-muh-TOR-ee PROS-tuh-TY-tis)
    Pronunciation of dictionary term "asymptomatic inflammatory prostatitis"
    Inflammation of the prostate gland where the only symptom is the presence of white blood cells in the prostate fluid.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  AT/RT: A very rare, fast-growing cancer that usually forms in the tissues of the central nervous system (CNS), such as the cerebellum (the part of the brain that controls movement and balance) or brain stem. AT/RTs may also form in areas of the body outside the CNS, such as the kidney, but this is rare. Most of these types of tumors are caused by mutations (changes) in the tumor suppressor genes SMARCB1 or SMARCA4, which make proteins that help control cell growth. AT/RTs usually occur in children aged 3 years and younger, but they can also occur in older children and adults. Also called ATT/RHT and atypical teratoid/rhabdoid tumor.
    More Information
    - Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment
  AT7519M: A substance being studied in the treatment of some types of cancer. AT7519M blocks enzymes needed for cells to divide. It is a type of cyclin-dependent kinase inhibitor. Also called CDK inhibitor AT7519M.
  AT9283: A substance being studied in the treatment of some types of cancer. It blocks enzymes (Aurora kinases) involved in cell division and may kill cancer cells. AT9283 is a type of serine/threonine protein kinase inhibitor. Also called Aurora kinase inhibitor AT9283.
  atamestane: (uh-TA-meh-stayn)
    Pronunciation of dictionary term "atamestane"
    A substance that is being studied in the treatment of cancer. Atamestane blocks the production of the hormone estrogen in the body. It belongs to the family of drugs called antiestrogens.
  ataxia: (uh-TAK-see-uh)
    Pronunciation of dictionary term "ataxia"
    Loss of muscle coordination.
  ataxia-telangiectasia: (uh-TAK-see-uh-teh-LAN-jee-ek-TAY-zhuh)
    Pronunciation of dictionary term "ataxia-telangiectasia"
    A rare, inherited, progressive, degenerative disease of childhood that causes loss of muscle control, a weakened immune system, and an increased risk of cancer.
    More Information
    - Ataxia telangiectasia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5862/ataxia-telangiectasia)
    - Ataxia-telangiectasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/ataxia-telangiectasia/)
  ataxic gait: (uh-TAK-sik gayt)
    Pronunciation of dictionary term "ataxic gait"
    Awkward, uncoordinated walking.
  atelectasis: (A-teh-LEK-tuh-sis)
    Pronunciation of dictionary term "atelectasis"
    Failure of the lung to expand (inflate) completely. This may be caused by a blocked airway, a tumor, general anesthesia, pneumonia or other lung infections, lung disease, or long-term bedrest with shallow breathing. Sometimes called a collapsed lung.
  atezolizumab: (A-teh-zoh-LIZ-yoo-mab)
    Pronunciation of dictionary term "atezolizumab"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer, including cancers that express PD-L1. Atezolizumab is used alone or with other drugs to treat adults with certain types of hepatocellular carcinoma (a type of liver cancer), melanoma, non-small cell lung cancer, or small cell lung cancer. It is also used alone to treat adults and children aged 2 years and older with alveolar soft part sarcoma that has spread to other parts of the body or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Atezolizumab may block PD-L1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Tecentriq.
    More Information
    - Atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab)
  atezolizumab and hyaluronidase: (A-teh-zoh-LIZ-yoo-mab … HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "atezolizumab and hyaluronidase"
    A combination of two drugs used alone or with other drugs to treat adults with certain types of alveolar soft part sarcoma (a type of soft tissue tumor), hepatocellular carcinoma (a type of liver cancer), melanoma, non-small cell lung cancer, and small cell lung cancer. Atezolizumab binds to a protein called PD-L1, which is found on some normal cells and some types of cancer cells. Atezolizumab may block PD-L1 and help the immune system kill cancer cells. Hyaluronidase allows atezolizumab to be given by injection under the skin. Atezolizumab and hyaluronidase can be given in less time than atezolizumab alone, which is given as an infusion. Also called Tecentriq Hybreza.
    More Information
    - Atezolizumab and Hyaluronidase-tqjs (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab-and-hyaluronidase-tqjs)
  athymic nude mouse: (ay-THY-mik nood ...)
    Pronunciation of dictionary term "athymic nude mouse"
    A type of laboratory mouse that is hairless, lacks a normal thymus gland, and has a defective immune system because of a genetic mutation. Athymic nude mice are often used in cancer research because they do not reject tumor cells, from mice or other species.
  atiprimod: (uh-TIH-prih-mod)
    Pronunciation of dictionary term "atiprimod"
    A substance being studied in the treatment of certain multiple myelomas and other advanced cancers. Atiprimod may block the growth of tumors and may prevent the growth of new blood vessels that tumors need to grow. Atiprimod is a type of signal transduction inhibitor and a type of antiangiogenesis agent. Also called azaspirane and SK&F106615.
  ATLL: An aggressive (fast-growing) type of T-cell non-Hodgkin lymphoma caused by the human T-cell leukemia virus type 1 (HTLV-1). It is marked by bone and skin lesions, high calcium levels, and enlarged lymph nodes, spleen, and liver. Also called adult T-cell leukemia/lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  ATN-161: A substance being studied in the treatment of some types of cancer. ATN-161 may prevent the spread of tumor cells and may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent.
  ATN-224: A substance being studied in the treatment of cancer. It may prevent the growth of new blood vessels that tumors need to grow. ATN-224 also blocks enzymes that cells need to divide and grow, and it may kill cancer cells. It is a type of antiangiogenesis agent and a type of superoxide dismutase inhibitor. Also called SOD1 inhibitor ATN-224.
  atom: (A-tum)
    Pronunciation of dictionary term "atom"
    The smallest part of a substance that cannot be broken down chemically. Each atom has a nucleus (center) made up of protons (positive particles) and neutrons (particles with no charge). Electrons (negative particles) move around the nucleus. Atoms of different elements contain different numbers of protons, neutrons, and electrons.
  atorvastatin: (uh-TOR-vuh-STA-tin)
    Pronunciation of dictionary term "atorvastatin"
    The active ingredient in a drug used to lower the amount of cholesterol in the blood and to prevent stroke, heart attack, and angina (chest pain). It is also being studied in the prevention and treatment of some types of cancer and other conditions. Atorvastatin blocks an enzyme that helps make cholesterol in the body. It also causes an increase in the breakdown of cholesterol. It is a type of HMG-CoA reductase inhibitor and a type of statin.
  atorvastatin calcium: (uh-TOR-vuh-STA-tin KAL-see-um)
    Pronunciation of dictionary term "atorvastatin calcium"
    A drug used to lower the amount of cholesterol in the blood and to prevent stroke, heart attack, and angina (chest pain). It is also being studied in the prevention and treatment of some types of cancer and other conditions. Atorvastatin calcium blocks an enzyme that helps make cholesterol in the body. It also causes an increase in the breakdown of cholesterol. It is a type of HMG-CoA reductase inhibitor and a type of statin. Also called Lipitor.
  ATP: A substance present in all living cells that provides energy for many metabolic processes and is involved in making RNA. ATP made in the laboratory is being studied in patients with advanced solid tumors to see if it can decrease weight loss and improve muscle strength. Also called adenosine triphosphate.
  ATRA: A nutrient that the body needs in small amounts to function and stay healthy. ATRA is made in the body from vitamin A and helps cells to grow and develop, especially in the embryo. A form of ATRA made in the laboratory is put on the skin to treat conditions such as acne and is taken by mouth to treat acute promyelocytic leukemia (a fast-growing cancer in which there are too many immature blood-forming cells in the blood and bone marrow). ATRA is being studied in the prevention and treatment of other types of cancer. Also called all-trans retinoic acid, retinoic acid, tretinoin, and vitamin A acid.
  atrasentan: (A-truh-SEN-tan)
    Pronunciation of dictionary term "atrasentan"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called endothelin-1 protein receptor antagonists.
  atrial fibrillation: (AY-tree-ul fih-bruh-LAY-shun)
    Pronunciation of dictionary term "atrial fibrillation"
    An irregular heartbeat that occurs when the electrical signals in the atria (the two upper chambers of the heart) fire rapidly at the same time. This causes the heart to beat faster than normal. Although atrial fibrillation can occur without any signs or symptoms, it may sometimes cause fatigue, chest pain, heart palpitations, trouble breathing, low blood pressure, dizziness or fainting, weakness, and other signs and symptoms. Atrial fibrillation may be caused by certain conditions, such as high blood pressure, heart attack, coronary artery disease, abnormal heart valves, congenital heart disease, lung disease, viral infections, or an overactive thyroid gland. Previous heart surgery, stress, or exposure to caffeine, tobacco, alcohol, or certain medicines may also lead to atrial fibrillation. It may go away on its own or it may last for many years. If not treated, atrial fibrillation can lead to serious problems, such as blood clots, stroke, and heart failure. It is more common in older adults. Also called afib.
  atrophic gastritis: (ay-TROH-fik gas-TRY-tis)
    Pronunciation of dictionary term "atrophic gastritis"
    A condition marked by chronic inflammation and thinning of the inner lining of the stomach. It may also involve the loss of gland cells in the stomach lining that release substances that help digest food. Atrophic gastritis may be caused by an infection with the bacteria H. pylori that continues or gets worse over a long period of time or by certain autoimmune conditions. People who have atrophic gastritis may have an increased risk of stomach cancer or gastrointestinal neuroendocrine tumors.
  atrophic vaginitis: (ay-TROH-fik va-jih-NY-tis)
    Pronunciation of dictionary term "atrophic vaginitis"
    A condition in which the tissues lining the inside of the vagina (birth canal) become thin, dry, and inflamed. This is caused by a decrease in the amount of estrogen (a female hormone) made by the body. Symptoms of atrophic vaginitis include vaginal dryness, itching, and burning, and pain during sexual intercourse. Other symptoms include a burning feeling while urinating, feeling a need to urinate often or right away, and being unable to control the flow of urine. Atrophic vaginitis most commonly occurs in women who have gone through menopause naturally or who have early menopause caused by certain types of cancer treatment (such as radiation therapy to the pelvis or chemotherapy) or by having their ovaries removed by surgery. Also called vaginal atrophy.
  atropine sulfate: (A-troh-peen SUL-fayt)
    Pronunciation of dictionary term "atropine sulfate"
    A drug used to block nerve stimulation of muscles and glands and relax smooth muscles. It is also used to increase heart rate, reduce secretions, and treat the effects of certain poisons. It is a type of antimuscarinic agent and a type of tropane alkaloid.
  atropine suppression test: (A-troh-peen suh-PREH-shun …)
    Pronunciation of dictionary term "atropine suppression test"
    A test used to help find out if secretion of pancreatic polypeptide (a protein released by the pancreas) is normal or caused by a tumor. A drug called atropine sulfate is injected into the patient’s vein and level of pancreatic polypeptide in the blood is measured. If there is a tumor, the injection will not change the level of pancreatic polypeptide. If there is no tumor, the level of pancreatic polypeptide will drop.
  ATT/RHT: A very rare, fast-growing cancer that usually forms in the tissues of the central nervous system (CNS), such as the cerebellum (the part of the brain that controls movement and balance) or brain stem. ATT/RHTs may also form in areas of the body outside the CNS, such as the kidney, but this is rare. Most of these types of tumors are caused by mutations (changes) in the tumor suppressor genes SMARCB1 or SMARCA4, which make proteins that help control cell growth. ATT/RHTs usually occur in children aged 3 years and younger, but they can also occur in older children and adults. Also called AT/RT and atypical teratoid/rhabdoid tumor.
    More Information
    - Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment
  attending physician: (uh-TEN-ding fih-ZIH-shun)
    Pronunciation of dictionary term "attending physician"
    A medical doctor who is responsible for the overall care of a patient in a hospital or clinic setting. An attending physician may also supervise and teach medical students, interns, and residents involved in the patient’s care.
  attenuated: (uh-TEN-yoo-way-ted)
    Pronunciation of dictionary term "attenuated"
    Weakened or thinned. Attenuated strains of disease-causing bacteria and viruses are often used as vaccines. The weakened strains are used as vaccines because they stimulate a protective immune response while causing no disease or only mild disease in the person receiving the vaccine.
  attenuated familial adenomatous polyposis: (uh-TEN-yoo-way-ted fuh-MIH-lee-ul A-deh-NOH-muh-tus PAH-lee-POH-sis)
    Pronunciation of dictionary term "attenuated familial adenomatous polyposis"
    A rare, inherited disorder in which multiple polyps (abnormal growths) form on the inner walls of the colon and rectum. People with attenuated familial adenomatous polyposis usually develop fewer than 100 polyps. Benign (not cancer) tumors may also occur in the stomach, small intestine, bone, skin, and soft tissue. People with attenuated familial adenomatous polyposis have a very high risk of developing colorectal cancer and may also be at risk of developing cancers of the stomach, small intestine, liver, and breast. Attenuated familial adenomatous polyposis is caused by mutations (changes) in the APC gene that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called AFAP.
    More Information
    - Attenuated familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8532/attenuated-familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  aTTP: A rare condition in which blood clots form in small blood vessels throughout the body. These clots can block the flow of blood and oxygen to the body’s organs, which leads to a lower-than-normal number of platelets in the blood. Signs and symptoms of aTTP include purple bruises or tiny red or purple spots on the skin, bleeding problems, anemia, fever, chest pain, nervous system problems, and kidney problems. aTTP occurs when the body starts producing antibodies that block an enzyme called ADAMTS13, which is involved in blood clotting. It may be brought on by certain diseases or conditions (such as pregnancy, cancer, lupus, HIV, or other infections), certain medicines (such as chemotherapy or hormone therapy), or certain procedures (such as surgery or a stem cell transplant). aTTP usually occurs in adults. Also called acquired thrombotic thrombocytopenic purpura.
  atypia: (ay-TIH-pee-uh)
    Pronunciation of dictionary term "atypia"
    State of being not typical or normal. In medicine, atypia is an abnormality in cells in tissue.
  atypical: (ay-TIH-pih-kul)
    Pronunciation of dictionary term "atypical"
    Not normal. Describes a state, condition, or behavior that is unusual or different from what is considered normal. In medicine, an atypical lesion or growth in or on the body may be benign (not cancer), precancerous or premalignant (likely to become cancer), or malignant (cancer). Also called abnormal.
  atypical ductal breast hyperplasia: (ay-TIH-pih-kul DUK-tul brest HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "atypical ductal breast hyperplasia"
    A benign (not cancer) condition in which there are more cells than normal in the lining of breast ducts and the cells look abnormal under a microscope. Having atypical ductal breast hyperplasia increases the risk of breast cancer. Also called ADH and atypical ductal hyperplasia.
  atypical ductal hyperplasia: (ay-TIH-pih-kul DUK-tul HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "atypical ductal hyperplasia"
    A benign (not cancer) condition in which there are more cells than normal in the lining of breast ducts and the cells look abnormal under a microscope. Having atypical ductal hyperplasia increases the risk of breast cancer. Also called ADH and atypical ductal breast hyperplasia.
  atypical glandular cells: (ay-TIH-pih-kul GLAN-juh-ler sels)
    Pronunciation of dictionary term "atypical glandular cells"
    A finding of abnormal cells in a Pap test. The glandular cells come from the inner part of the cervix or the lining of the uterus. This finding may be a sign of cancer or other serious condition, and more testing may be needed. Also called AGC.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  atypical glandular cells of uncertain significance: (ay-TIH-pih-kul GLAN-juh-ler sels … UN-ser-tun sig-NIH-fih-kunts)
    Pronunciation of dictionary term "atypical glandular cells of uncertain significance"
    A term that has been used to describe abnormal cells that come from glands in the walls of the cervix (the lower, narrow end of the uterus). These abnormal cells are found in a small number of Pap smears (a procedure used to detect cervical cancer) and may be a sign of more serious lesions or cancer. The term used now is atypical glandular cells. Also called AGUS and atypical glandular cells of undetermined significance.
  atypical glandular cells of undetermined significance: (ay-TIH-pih-kul GLAN-juh-ler sels … UN-deh-TER-mind sig-NIH-fih-kunts)
    Pronunciation of dictionary term "atypical glandular cells of undetermined significance"
    A term that has been used to describe abnormal cells that come from glands in the walls of the cervix (the lower, narrow end of the uterus). These abnormal cells are found in a small number of Pap smears (a procedure used to detect cervical cancer) and may be a sign of more serious lesions or cancer. The term used now is atypical glandular cells. Also called AGUS and atypical glandular cells of uncertain significance.
  atypical hyperplasia: (ay-TIH-pih-kul HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "atypical hyperplasia"
    A benign (not cancer) condition in which cells look abnormal under a microscope and are increased in number.
  atypical lobular breast hyperplasia: (ay-TIH-pih-kul LAH-byoo-ler brest HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "atypical lobular breast hyperplasia"
    A benign (not cancer) condition in which there are more cells than normal in the breast lobules and the cells look abnormal under a microscope. Having atypical lobular breast hyperplasia increases the risk of breast cancer. Also called ALH and atypical lobular hyperplasia.
  atypical lobular hyperplasia: (ay-TIH-pih-kul LAH-byoo-ler HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "atypical lobular hyperplasia"
    A benign (not cancer) condition in which there are more cells than normal in the breast lobules and the cells look abnormal under a microscope. Having atypical lobular hyperplasia increases the risk of breast cancer. Also called ALH and atypical lobular breast hyperplasia.
  atypical mole: (ay-TIH-pih-kul mole)
    Pronunciation of dictionary term "atypical mole"
    A type of mole that looks different from a common mole. Several different types of moles are called atypical. Atypical moles are often larger than common moles and have regular or ragged or blurred borders that are not easy to see. Colors of atypical moles may be the same as the rest of the skin, or lighter, darker, or uneven. Parts or all of the mole may be raised above the skin surface. It is rare, but some atypical moles can develop into melanoma (a type of skin cancer). An atypical mole is sometimes called a Spitz nevus, a congenital nevus, a birthmark, or a dysplastic nevus.
    More Information
    - Common Moles, Dysplastic Nevi, and Risk of Melanoma (https://www.cancer.gov/types/skin/moles-fact-sheet)
  atypical squamous cells of undetermined significance: (ay-TIH-pih-kul SKWAY-mus sels … UN-deh-TER-mind sig-NIH-fih-kunts)
    Pronunciation of dictionary term "atypical squamous cells of undetermined significance"
    A finding of abnormal cells in the tissue that lines the outer part of the cervix. Atypical squamous cells of undetermined significance is the most common abnormal finding in a Pap test. It may be a sign of infection with certain types of human papillomavirus (HPV) or other types of infection, such as a yeast infection. It may also be a sign of inflammation, low hormone levels (in menopausal women), or a benign (not cancer) growth, such as a cyst or polyp. More testing, such as an HPV test or another Pap test, may be needed. Also called ASC-US and ASCUS.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  atypical squamous cells, cannot exclude a high-grade lesion: (ay-TIH-pih-kul SKWAY-mus sels, KA-not ek-SKLOOD … hy-grayd LEE-zhun)
    Pronunciation of dictionary term "atypical squamous cells, cannot exclude a high-grade lesion"
    A finding of abnormal cells in a Pap test. It means there are abnormal squamous cells in the tissue that lines the outer part of the cervix. Atypical squamous cells, cannot exclude a high-grade lesion may be a sign of a high-grade squamous intraepithelial lesion (HSIL), which may become cervical cancer if untreated. More testing may be needed. Also called ASC-H.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  atypical teratoid/rhabdoid tumor: (ay-TIH-pih-kul TAYR-uh-toyd/RAB-doyd TOO-mer)
    Pronunciation of dictionary term "atypical teratoid/rhabdoid tumor"
    A very rare, fast-growing cancer that usually forms in the tissues of the central nervous system (CNS), such as the cerebellum (the part of the brain that controls movement and balance) or brain stem. Atypical teratoid/rhabdoid tumors may also form in areas of the body outside the CNS, such as the kidney, but this is rare. Most of these types of tumors are caused by mutations (changes) in the tumor suppressor genes SMARCB1 or SMARCA4, which make proteins that help control cell growth. Atypical teratoid/rhabdoid tumors usually occur in children aged 3 years and younger, but they can also occur in older children and adults. Also called AT/RT and ATT/RHT.
    More Information
    - Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment
  Aucatzyl: (aw-KAT-zil)
    Pronunciation of dictionary term "Aucatzyl"
    A drug used to treat adults with acute lymphoblastic leukemia that came back or did not get better during or after other treatment. It is also being studied in the treatment of other conditions and types of cancer. Aucatzyl is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Aucatzyl binds to a protein called CD19, which is found on some leukemia cells. This helps the body’s immune system kill cancer cells. Aucatzyl is a type of CAR T-cell therapy. Also called obecabtagene autoleucel.
    More Information
    - Obecabtagene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/obecabtagene-autoleucel)
  auditory: (AW-duh-TOR-ee)
    Pronunciation of dictionary term "auditory"
    Having to do with the ear and the sense of hearing.
  auditory brain stem response test: (AW-duh-TOR-ee brayn stem reh-SPONTS …)
    Pronunciation of dictionary term "auditory brainstem response test"
    A test used to detect some types of hearing loss, such as hearing loss caused by injury or tumors that affect nerves involved in hearing. Electrodes are placed on the head and certain tones or clicking sounds are made. The electrodes measure nerve signals in the brain when it reacts to the sounds. Also called ABR test, BAER test, and brain stem auditory evoked response test.
    More Information
    - Langerhans Cell Histiocytosis Treatment
  Augmentin: (awg-MEN-tin)
    Pronunciation of dictionary term "Augmentin"
    A drug used to treat bacterial infections. Adding the chemical clavulanate potassium to the antibiotic amoxicillin increases the amount of time the antibiotic stays active in the body. Augmentin is a type of combination antibiotic. Also called amoxicillin-clavulanate potassium.
  augmerosen: (awg-MEH-roh-sen)
    Pronunciation of dictionary term "augmerosen"
    A substance being studied in the treatment of cancer. It may kill cancer cells by blocking the production of a protein that makes cancer cells live longer and by making them more sensitive to anticancer drugs. It is a type of antisense oligodeoxyribonucleotide. Also called bcl-2 antisense oligodeoxynucleotide G3139, Genasense, and oblimersen sodium.
  Augtyro: (aug-TY-roh)
    Pronunciation of dictionary term "Augtyro"
    A drug used to treat adults with non-small cell lung cancer that has spread and has an abnormal ROS1 gene and adults and children aged 12 years and older with certain types of solid tumors that have an NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Augtyro blocks certain proteins involved in cell signaling and cell growth. Blocking these proteins may help keep cancer cells from growing. Augtyro is a type of kinase inhibitor. Also called repotrectinib.
    More Information
    - Repotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/repotrectinib)
  auricular: (aw-RIH-kyoo-ler)
    Pronunciation of dictionary term "auricular"
    Having to do with the ear.
  auricular acupuncture: (aw-RIH-kyoo-ler AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "auricular acupuncture"
    A type of acupuncture in which thin needles are inserted at specific points on the outer ear to control pain and other symptoms. It is thought that the outer ear contains a “map” of the whole body and that specific points on this map match up with certain parts of the body. Also called ear acupuncture.
    More Information
    - Acupuncture (Health Professional Version) (https://www.cancer.gov/about-cancer/treatment/cam/hp/acupuncture-pdq)
  Aurimmune: (AW-rih-MYOON)
    Pronunciation of dictionary term "Aurimmune"
    A substance being studied in the treatment of some types of cancer. Aurimmune is made in the laboratory by binding a cancer-killing protein called tumor necrosis factor (TNF) to the surface of very tiny particles of gold. These TNF-gold particles may kill cancer cells without harming healthy tissue. Also called colloidal gold-bound tumor necrosis factor and TNF-bound colloidal gold.
  Aurora B/C kinase inhibitor GSK1070916A: (uh-ROR-uh … KY-nays in-HIH-bih-ter …)
    Pronunciation of dictionary term "Aurora B/C kinase inhibitor GSK1070916A"
    A substance being studied in the treatment of some types of cancer. It blocks certain enzymes (Aurora kinases) involved in cell division and may kill cancer cells. It is a type of serine/threonine protein kinase inhibitor. Also called GSK1070916A.
  Aurora kinase inhibitor AT9283: (uh-ROR-uh KY-nays in-HIH-bih-ter...)
    Pronunciation of dictionary term "Aurora kinase inhibitor AT9283"
    A substance being studied in the treatment of some types of cancer. It blocks enzymes (Aurora kinases) involved in cell division and may kill cancer cells. Aurora kinase inhibitor AT9283 is a type of serine/threonine protein kinase inhibitor. Also called AT9283.
  aurotherapy: (AW-roh-THAYR-uh-pee)
    Pronunciation of dictionary term "aurotherapy"
    A procedure that uses gold salts (a salt form of the metal element gold) to treat diseases, such as rheumatoid arthritis. The gold salts stop cells from releasing chemicals that can harm tissues. Also called chrysotherapy and gold therapy.
  autoantibody: (AW-toh-AN-tee-BAH-dee)
    Pronunciation of dictionary term "autoantibody"
    An antibody made against substances formed by a person’s own body. Autoantibodies can directly destroy cells that have the substances on them or can make it easier for other white blood cells to destroy them. Some autoimmune diseases are caused by autoantibodies.
  autoclave: (AW-toh-KLAYV)
    Pronunciation of dictionary term "autoclave"
    A device that uses steam under high pressure to sterilize medical and laboratory supplies and equipment.
  autoclave-resistant factor: (AW-toh-klayv-reh-ZIH-stunt FAK-ter)
    Pronunciation of dictionary term "autoclave-resistant factor"
    A substance found in soybeans that may slow down or stop the spread of cancer. This substance does not break down in an autoclave (a device that uses steam under high pressure to sterilize medical and laboratory supplies and equipment).
  autoimmune condition: (AW-toh-ih-MYOON kun-DIH-shun)
    Pronunciation of dictionary term "autoimmune condition"
    A condition in which the body’s immune system mistakes its own healthy tissues as foreign and attacks them. Most autoimmune conditions cause inflammation that can affect many parts of the body. The parts of the body affected depend on which autoimmune condition a person has. Common signs and symptoms include fatigue, fever, muscle aches, joint pain and swelling, skin problems, abdominal pain, digestion problems, and swollen glands. The symptoms often come and go and can be mild or severe. There are many different types of autoimmune conditions. They are more common in women and can run in families. Also called autoimmune disease.
  autoimmune disease: (AW-toh-ih-MYOON dih-ZEEZ)
    Pronunciation of dictionary term "autoimmune disease"
    A condition in which the body’s immune system mistakes its own healthy tissues as foreign and attacks them. Most autoimmune diseases cause inflammation that can affect many parts of the body. The parts of the body affected depend on which autoimmune disease a person has. Common signs and symptoms include fatigue, fever, muscle aches, joint pain and swelling, skin problems, abdominal pain, digestion problems, and swollen glands. The symptoms often come and go and can be mild or severe. There are many different types of autoimmune diseases. They are more common in women and can run in families. Also called autoimmune condition.
  autoimmune enteropathy: (AW-toh-ih-MYOON en-teh-RAH-puh-thee)
    Pronunciation of dictionary term "autoimmune enteropathy"
    A rare disease in which certain cells in the intestine are destroyed by a patient’s immune system. It causes severe, chronic, diarrhea and usually occurs in children.
  autoimmune hemolytic anemia: (AW-toh-ih-MYOON hee-moh-LIH-tik uh-NEE-mee-uh)
    Pronunciation of dictionary term "autoimmune hemolytic anemia"
    A condition in which the body’s immune system stops red blood cells from forming or causes them to clump together. Autoimmune hemolytic anemia can occur in patients who have chronic lymphocytic leukemia (CLL). Also called immune complex hemolytic anemia and immunohemolytic anemia.
  autoimmune paraneoplastic disease: (AW-toh-ih-MYOON PAYR-uh-NEE-oh-PLAS-tik dih-ZEEZ)
    Pronunciation of dictionary term "autoimmune paraneoplastic disease"
    A condition that can occur in some people with cancer when the body’s immune system becomes overactive and attacks healthy cells while trying to kill cancer cells. Autoimmune paraneoplastic diseases may cause damage to many different tissues and organs, including the skin, blood, kidneys, nervous system, and muscles and bones. These diseases occur most often in middle-aged adults with thymoma, lymphoma, or cancers of the breast, lung, or ovary. Signs and symptoms may occur before a cancer diagnosis is made.
  autoimmune thyroiditis: (AW-toh-ih-MYOON thy-roy-DY-tis)
    Pronunciation of dictionary term "autoimmune thyroiditis"
    An autoimmune condition of the thyroid gland (a gland located beneath the larynx). It is caused by the formation of antibodies that attack the thyroid gland and it usually causes hypothyroidism (too little thyroid hormone). Symptoms include fatigue, weight gain, constipation, dry skin, depression, and the inability to exercise. It is more common in females and can run in families. Also called Hashimoto disease and Hashimoto thyroiditis.
  autologous: (aw-TAH-luh-gus)
    Pronunciation of dictionary term "autologous"
    Taken from an individual's own tissues, cells, or DNA.
  autologous bone marrow: (aw-TAH-luh-gus bone MAYR-oh)
    Pronunciation of dictionary term "autologous bone marrow"
    In transplantation, refers to a person's own bone marrow. Bone marrow is the soft, sponge-like tissue in the center of most large bones that produces white blood cells, red blood cells, and platelets.
  autologous bone marrow transplant: (aw-TAH-luh-gus bone MAYR-oh TRANZ-plant)
    Pronunciation of dictionary term "autologous bone marrow transplant"
    A procedure in which a patient’s healthy stem cells (blood-forming cells) are collected from the bone marrow before treatment, stored, and then given back to the patient after treatment. An autologous bone marrow transplant replaces a patient’s stem cells that were destroyed by treatment with radiation or high doses of chemotherapy.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  autologous expanded mesenchymal stem cells OTI-010: (aw-TAH-luh-gus … meh-ZEN-kih-mul …)
    Pronunciation of dictionary term "autologous expanded mesenchymal stem cells OTI-010"
    A product that is made of special stem cells taken from a patient’s bone marrow and grown in the laboratory. After a patient’s bone marrow is destroyed by treatment with whole body irradiation or chemotherapy, these cells are injected back into the patient to help rebuild bone marrow. Autologous expanded mesenchymal stem cells OTI-010 has been studied in the prevention of graft-versus-host disease during stem cell transplant in patients receiving treatment for cancer. Autologous expanded mesenchymal stem cells OTI-010 is used in cellular therapy. Also called Stromagen.
  autologous lymphocyte: (aw-TAH-luh-gus LIM-foh-site)
    Pronunciation of dictionary term "autologous lymphocyte"
    In transplantation, refers to a person’s own white blood cells. Lymphocytes have a number of roles in the immune system, including the production of antibodies and other substances that fight infections and other diseases.
  autologous stem cell transplant: (aw-TAH-luh-gus ... TRANZ-plant)
    Pronunciation of dictionary term "autologous stem cell transplant"
    A procedure in which a patient’s healthy stem cells (blood-forming cells) are collected from the blood or bone marrow before treatment, stored, and then given back to the patient after treatment. An autologous stem cell transplant replaces a patient’s stem cells that were destroyed by treatment with radiation or high doses of chemotherapy. An autologous stem cell transplant is most often used to treat blood cancers, such as leukemia and lymphoma.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
    Autologous stem cell transplant. (Step 1): Blood is taken from a vein in the patient’s arm and flows through an apheresis machine that removes the stem cells. The remaining blood is returned to a vein in the other arm. (Step 2): The patient receives chemotherapy to kill cancer cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. (Step 3): After the patient completes chemotherapy or radiation therapy (not shown), the stem cells are given back to the patient to replace the blood-forming cells that were destroyed by the cancer treatment. The stem cells help the bone marrow recover and make healthy blood cells.
    Autologous stem cell transplant; (Panel 1): Drawing of stem cells being removed from a patient’s blood using an apheresis machine. Blood is collected from a vein in the arm and flows through the machine that removes the stem cells. The remaining blood is returned to a vein in the other arm. (Panel 2): Drawing of a health care provider giving a patient chemotherapy to kill cancer cells. The chemotherapy is given as an infusion through a catheter in the patient’s chest. (Panel 3): Drawing of a patient receiving stem cells as an infusion through a catheter in the chest.
  autologous tumor cell: (aw-TAH-luh-gus TOO-mer sel)
    Pronunciation of dictionary term "autologous tumor cell"
    A cancer cell from an individual's own tumor.
  autonomic nervous system: (AW-toh-NAH-mik NER-vus SIS-tem)
    Pronunciation of dictionary term "autonomic nervous system"
    The part of the nervous system that controls muscles of internal organs (such as the heart, blood vessels, lungs, stomach, and intestines) and glands (such as salivary glands and sweat glands). One part of the autonomic nervous system helps the body rest, relax, and digest food and another part helps a person fight or take flight in an emergency. Also called ANS and involuntary nervous system.
  autonomic nervous system disorder: (AW-toh-NAH-mik NER-vus SIS-tem dis-OR-der)
    Pronunciation of dictionary term "autonomic nervous system disorder"
    A condition that affects the part of the nervous system called the autonomic nervous system (ANS). The ANS controls many important automatic body processes, such as blood pressure, heart rate, breathing, body temperature, digestion, sweating, urination, and sexual response. An autonomic nervous system disorder can affect all or part of the ANS and can cause serious problems, such as heart and blood pressure problems, trouble breathing or swallowing, or impotence in males. There are many different types of autonomic nervous system disorders. They may be inherited or caused by injury or by conditions such as diabetes, Parkinson disease, autoimmune disease, and alcoholism. Sometimes, the cause is not known. Also called dysautonomia.
  autophagy: (aw-TAH-fuh-jee)
    Pronunciation of dictionary term "autophagy"
    A process by which a cell breaks down and destroys old, damaged, or abnormal proteins and other substances in its cytoplasm (the fluid inside a cell). The breakdown products are then recycled for important cell functions, especially during periods of stress or starvation. Autophagy also helps destroy bacteria and viruses that cause infection and may prevent normal cells from becoming cancer cells. Once cancer has formed, autophagy may protect the cancer cells by providing extra nutrients to them or by keeping anticancer drugs or other substances from destroying them. Autophagy may also affect the body’s immune response against viruses, bacteria, and cancer cells.
  autosomal: (AW-toh-SOH-mul)
    Pronunciation of dictionary term "autosomal"
    Having to do with the 22 pairs of numbered chromosomes found in most human cells. The chromosome pairs are numbered from 1 to 22 based on their size or the number of genes each pair contains. The sex chromosomes (the X and Y chromosomes) determine whether a person is male or female and are not considered autosomal chromosomes.
    More Information
    - Autosome (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=13)
  autosomal dominant inheritance: (AW-toh-SOH-mul DAH-mih-nunt in-HAYR-ih-tunts)
    Pronunciation of dictionary term "autosomal dominant inheritance"
    One of the ways a genetic trait or a genetic condition can be passed down (inherited) from parent to child. In autosomal dominant inheritance, a genetic condition can occur when the child inherits one copy of a mutated (changed) gene from one parent. A child who has a parent with the mutated gene has a 50% chance of inheriting that mutated gene.
    More Information
    - Autosomal Dominant (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Autosomal-Dominant)
    Autosomal dominant inheritance is a way a genetic trait or condition can be passed down from parent to child. One copy of a mutated (changed) gene from one parent can cause the genetic condition. A child who has a parent with the mutated gene has a 50% chance of inheriting that mutated gene. Men and women are equally likely to have these mutations and sons and daughters are equally likely to inherit them.
    Drawing showing an autosomal dominant inheritance pattern between a father, mother, and their four children: a chromosome pair with a normal gene and a mutated gene in an affected father; two normal genes in an unaffected mother; a normal gene and a mutated gene in an affected daughter and in an affected son; and two normal genes in an unaffected daughter and in an unaffected son.
    Autosomal dominant inheritance is a way a genetic trait or condition can be passed down from parent to child. One copy of a mutated (changed) gene from one parent can cause the genetic condition. A child who has a parent with the mutated gene has a 50% chance of inheriting that mutated gene. Men and women are equally likely to have these mutations and sons and daughters are equally likely to inherit them.
    Drawing showing an autosomal dominant inheritance pattern between a father, mother, and their four children: a chromosome pair with a normal gene and a mutated gene in an affected father; two normal genes in an unaffected mother; a normal gene and a mutated gene in an affected daughter and in an affected son; and two normal genes in an unaffected daughter and in an unaffected son.
  autosomal recessive inheritance: (AW-toh-SOH-mul reh-SEH-siv in-HAYR-ih-tunts)
    Pronunciation of dictionary term "autosomal recessive inheritance"
    One of the ways a genetic trait or a genetic condition can be passed down (inherited) from parent to child. In autosomal recessive inheritance, a genetic condition occurs when the child inherits one mutated copy of a gene from each parent. The parents usually do not have the condition. The parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  Avage: (AY-vazh)
    Pronunciation of dictionary term "Avage"
    A drug used on the skin to treat several skin conditions. It is also being studied in the treatment of basal cell skin cancer and basal cell nevus syndrome. Avage is related to vitamin A and is made in the laboratory. It turns on a gene that may help stop the growth of skin cancer cells. Avage is a type of synthetic retinoid. Also called tazarotene and Tazorac.
  Avandia: (uh-VAN-dee-uh)
    Pronunciation of dictionary term "Avandia"
    A drug that helps control the amount of glucose (sugar) in the blood and is being studied in the prevention and treatment of some types of cancer. Avandia stops cells from growing and may prevent the growth of new blood vessels that tumors need to grow. It is a type of thiazolidinedione and a type of antiangiogenesis agent. Also called rosiglitazone maleate.
  avapritinib: (AY-vah-PRIH-tih-nib)
    Pronunciation of dictionary term "avapritinib"
    A drug used to treat adults with advanced systemic mastocytosis or certain types of gastrointestinal stromal tumors. It is also being studied in the treatment of other types of cancer. Avapritinib blocks certain proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Ayvakit.
    More Information
    - Avapritinib (https://www.cancer.gov/about-cancer/treatment/drugs/avapritinib)
  avascular necrosis: (ay-VAS-kyoo-ler neh-KROH-sis)
    Pronunciation of dictionary term "avascular necrosis"
    A condition in which there is a loss of blood flow to bone tissue, which causes the bone to die. It is most common in the hips, knees, shoulders, and ankles. It may be caused by long-term use of steroid medicines, alcohol abuse, joint injuries, and certain diseases, such as cancer and arthritis. It may also occur at some point in time after cancer treatment that included methotrexate, bisphosphonates, or corticosteroids. Also called aseptic necrosis, ischemic necrosis, and osteonecrosis.
  Avastin: (uh-VAS-tin)
    Pronunciation of dictionary term "Avastin"
    A drug that contains the active ingredient bevacizumab and is used to treat many different types of cancer. Avastin is used alone or with other drugs to treat certain types of cervical cancer, colorectal cancer, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), glioblastoma (a type of brain cancer), hepatocellular carcinoma (a type of liver cancer), and ovarian epithelial, fallopian tube, and primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Avastin binds to a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody.
    More Information
    - Bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
  Avelox: (A-veh-lox)
    Pronunciation of dictionary term "Avelox"
    A drug used to treat bacterial infections. It is a type of fluoroquinolone. Also called moxifloxacin hydrochloride.
  avelumab: (a-VEL-yoo-mab)
    Pronunciation of dictionary term "avelumab"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Avelumab is used alone or with other drugs to treat certain types of advanced renal cell carcinoma (a type of kidney cancer), urothelial cancer (a type of cancer in the bladder or urinary tract), and Merkel cell carcinoma (a rare type of skin cancer). It is also being studied in the treatment of other types of cancer. Avelumab may block PD-L1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Bavencio.
    More Information
    - Avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab)
  Aventyl: (A-ven-til)
    Pronunciation of dictionary term "Aventyl"
    A drug used to treat depression. It may also be used to treat panic or anxiety disorders and certain types of pain, and to help people quit smoking. Aventyl increases the levels of norepinephrine and other natural chemicals in the brain. This helps improve mood and may reduce a person’s craving for nicotine. It is a type of tricyclic antidepressant. Also called nortriptyline and Pamelor.
  Avita: (uh-VEE-tuh)
    Pronunciation of dictionary term "Avita"
    A topical preparation of tretinoin that is used to treat acne. Tretinoin is a form of vitamin A.
  AVN944: A substance being studied in the treatment of cancer. It blocks cells from making DNA and RNA and may kill cancer cells. It is a type of inosine monophosphate dehydrogenase (IMPDH) inhibitor.
  Avodart: (A-vuh-dart)
    Pronunciation of dictionary term "Avodart"
    A drug used to treat symptoms of an enlarged prostate gland. It is being studied in the treatment of male hair loss and prostate cancer. Avodart blocks enzymes the body needs to make male sex hormones. It is a type of 5-alpha reductase inhibitor. Also called dutasteride and GG745.
    More Information
    - Prostate Cancer Prevention
  avoidance: (uh-VOY-dunts)
    Pronunciation of dictionary term "avoidance"
    The act of staying away from people, places, and thoughts that may cause anxiety, pain, or unpleasant feelings. Some types of cancer-related avoidance include refusing to accept a cancer diagnosis or get treatment, and using alcohol or other drugs to forget about having cancer.
  axicabtagene ciloleucel: (AK-see-KAB-tuh-jeen sy-loh-LOO-sel)
    Pronunciation of dictionary term "axicabtagene ciloleucel"
    A drug used to treat adults with follicular lymphoma or certain types of large B-cell lymphoma that relapsed (came back) or did not get better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Axicabtagene ciloleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Axicabtagene ciloleucel binds to a protein called CD19, which is found on most B-cell lymphoma cells. This helps the body’s immune system kill cancer cells. Axicabtagene ciloleucel is a type of CAR T-cell therapy. Also called Yescarta.
    More Information
    - Axicabtagene Ciloleucel (https://www.cancer.gov/about-cancer/treatment/drugs/axicabtageneciloleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  axilla: (ak-SIH-luh)
    Pronunciation of dictionary term "axilla"
    The underarm or armpit.
  axillary: (AK-sih-LAYR-ee)
    Pronunciation of dictionary term "axillary"
    Pertaining to the armpit area, including the lymph nodes that are located there.
  axillary dissection: (AK-sih-LAYR-ee dy-SEK-shun)
    Pronunciation of dictionary term "axillary dissection"
    Surgery to remove lymph nodes found in the armpit region. Also called axillary lymph node dissection.
  axillary lymph node: (AK-sih-LAYR-ee limf node)
    Pronunciation of dictionary term "axillary lymph node"
    A lymph node in the armpit region that drains lymph from the breast and nearby areas.
  axillary lymph node dissection: (AK-sih-LAYR-ee limf node dy-SEK-shun)
    Pronunciation of dictionary term "axillary lymph node dissection"
    Surgery to remove lymph nodes found in the armpit region. Also called axillary dissection.
  axitinib: (AK-sih-TIH-nib)
    Pronunciation of dictionary term "axitinib"
    A drug used alone or with other drugs to treat advanced renal cell carcinoma (a type of kidney cancer). It is used in patients whose cancer has not already been treated or whose cancer has not gotten better after treatment with one other systemic therapy. It is also being studied in the treatment of other types of cancer. Axitinib blocks proteins called growth factor receptors, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Axitinib is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Inlyta.
    More Information
    - Axitinib (https://www.cancer.gov/about-cancer/treatment/drugs/axitinib)
  Ayurveda: (i-yer-VAY-duh)
    Pronunciation of dictionary term "Ayurveda"
    A medical system from India that has been used for thousands of years. The goal is to cleanse the body and to restore balance to the body, mind, and spirit. It uses diet, herbal medicines, exercise, meditation, breathing, physical therapy, and other methods. It is a type of Complementary and Alternative Medicine (CAM) therapy. Also called Ayurvedic medicine.
  Ayurvedic medicine: (I-yer-VAY-dik MEH-dih-sin)
    Pronunciation of dictionary term "Ayurvedic medicine"
    A medical system from India that has been used for thousands of years. The goal is to cleanse the body and to restore balance to the body, mind, and spirit. It uses diet, herbal medicines, exercise, meditation, breathing, physical therapy, and other methods. It is a type of Complementary and Alternative Medicine (CAM) therapy. Also called Ayurveda.
  Ayvakit: (AY-vah-kit)
    Pronunciation of dictionary term "Ayvakit"
    A drug used to treat adults with advanced systemic mastocytosis or certain types of gastrointestinal stromal tumors. It is also being studied in the treatment of other types of cancer. Ayvakit blocks certain proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called avapritinib.
    More Information
    - Avapritinib (https://www.cancer.gov/about-cancer/treatment/drugs/avapritinib)
  azacitidine: (ay-zuh-SY-tih-deen)
    Pronunciation of dictionary term "azacitidine"
    A drug used under the brand names Onureg to treat adults with certain types of acute myeloid leukemia and Vidaza to treat adults with certain types of myelodysplastic syndromes and children aged 1 month and older with newly diagnosed juvenile myelomonocytic leukemia. It is also being studied in the treatment of other types of cancer. Azacitidine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Azacitidine (https://www.cancer.gov/about-cancer/treatment/drugs/azacitidine)
  azaspirane: (AY-zuh-SPEER-ayn)
    Pronunciation of dictionary term "azaspirane"
    A substance being studied in the treatment of certain multiple myelomas and other advanced cancers. Azaspirane may block the growth of tumors and may prevent the growth of new blood vessels that tumors need to grow. Azaspirane is a type of signal transduction inhibitor and a type of antiangiogenesis agent. Also called atiprimod and SK&F106615.
  azathioprine sodium: (AY-zuh-THY-oh-preen SOH-dee-um)
    Pronunciation of dictionary term "azathioprine sodium"
    A drug used to keep a patient from rejecting a transplanted kidney. It is also used in the treatment of rheumatoid arthritis that does not get better with other types of treatment. Azathioprine sodium blocks the growth of white blood cells and the synthesis of DNA, RNA, and protein. It is a type of immunosuppressant.
  AZD0530: A substance being studied in the treatment of some types of cancer. AZD0530 blocks enzymes needed for cancer growth. It is a type of tyrosine kinase inhibitor.
  AZD2171: A substance being studied in the treatment of some types of cancer. AZD2171 may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of antiangiogenesis agent and a type of vascular endothelial growth factor (VEGF) receptor tyrosine kinase inhibitor. Also called cediranib maleate and Recentin.
  AZD2281: A drug used alone or with other drugs to treat adults with certain types of prostate cancer, pancreatic cancer, breast cancer, or ovarian, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. AZD2281 blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. AZD2281 is a type of PARP inhibitor. Also called Lynparza, olaparib, and PARP inhibitor AZD2281.
    More Information
    - Olaparib (https://www.cancer.gov/about-cancer/treatment/drugs/olaparib)
  AZD6244: A drug used to treat children aged 2 years and older with a rare genetic condition called neurofibromatosis type 1. It is used in patients who have plexiform neurofibromas that are causing symptoms and cannot be removed by surgery. It is also being studied in the treatment of some types of cancer. AZD6244 blocks proteins called MEK1 and MEK2, which may help keep abnormal cells or cancer cells from growing. It is a type of kinase inhibitor. Also called Koselugo, MEK inhibitor AZD6244, and selumetinib sulfate.
    More Information
    - Selumetinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/selumetinibsulfate)
  Azedra: (uh-ZED-ruh)
    Pronunciation of dictionary term "Azedra"
    A drug that contains a form of radioactive iodine and is used to treat adults and children aged 12 years and older with certain types of malignant pheochromocytoma or paraganglioma that have spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Azedra builds up in tumor cells and gives off radiation that may kill them. It is a type of radiotherapeutic agent. Also called 131I-MIBG, iobenguane I 131, and iodine I 131-metaiodobenzylguanidine.
    More Information
    - Iobenguane I 131 (https://www.cancer.gov/about-cancer/treatment/drugs/iobenguaneI131)
  azoospermia: (AY-zoh-oh-SPER-mee-uh)
    Pronunciation of dictionary term "azoospermia"
    A condition in which there are no sperm in the semen when a man ejaculates. This may be because the man does not make sperm or because the sperm is blocked from entering the semen. Azoospermia may be caused by hormone problems, certain genetic conditions, previous vasectomy or other surgery, or other conditions. It may also be caused by certain cancer treatments. Azoospermia can cause infertility (the inability to produce children).
  azoxymethane: (ay-ZOK-see-MEH-thayn)
    Pronunciation of dictionary term "azoxymethane"
    A substance that is used in cancer research to cause colon tumors in laboratory animals. This is done to test new diets, drugs, and procedures for use in cancer prevention and treatment.
  AZQ: An anticancer drug that is able to cross the blood-brain barrier and kill cancer cells in the central nervous system. Also called diaziquone.
  AZT: A drug that inhibits the human immunodeficiency virus (HIV) that causes AIDS. Also called zidovudine.
  azygos vein: (ay-ZY-gus vayn)
    Pronunciation of dictionary term "azygos vein"
    A blood vessel that carries blood from the back walls of the chest and abdomen to the heart. The azygos vein is on the right side of the middle part of the spine.
  B cell: (… sel)
    Pronunciation of dictionary term "B cell"
    A type of white blood cell that makes antibodies. B cells are part of the immune system and develop from stem cells in the bone marrow. Also called B lymphocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  B lymphocyte: (... LIM-foh-site)
    Pronunciation of dictionary term "B lymphocyte"
    A type of white blood cell that makes antibodies. B lymphocytes are part of the immune system and develop from stem cells in the bone marrow. Also called B cell.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  B-cell acute lymphoblastic leukemia: (... sel uh-KYOOT LIM-foh-BLAS-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "B-cell acute lymphoblastic leukemia"
    An aggressive (fast-growing) type of leukemia (blood cancer) in which too many B-cell lymphoblasts (immature white blood cells) are found in the bone marrow and blood. It is the most common type of acute lymphoblastic leukemia (ALL). Also called B-cell acute lymphocytic leukemia and precursor B-lymphoblastic leukemia.
  B-cell acute lymphocytic leukemia: (... sel uh-KYOOT LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "B-cell acute lymphocytic leukemia"
    An aggressive (fast-growing) type of leukemia (blood cancer) in which too many B-cell lymphoblasts (immature white blood cells) are found in the bone marrow and blood. It is the most common type of acute lymphoblastic leukemia (ALL). Also called B-cell acute lymphoblastic leukemia and precursor B-lymphoblastic leukemia.
  B-cell leukemia/lymphoma 2 protein: (... sel loo-KEE-mee-uh/lim-FOH-muh 2 PROH-teen)
    Pronunciation of dictionary term "B-cell leukemia/lymphoma 2 protein"
    A protein that helps control whether a cell lives or dies by blocking a type of cell death called apoptosis. The gene for the B-cell leukemia/lymphoma 2 protein is found on chromosome 18, and transfer of the B-cell leukemia/lymphoma 2 gene to a different chromosome is seen in many B-cell leukemias and lymphomas. This causes the B-cell leukemia/lymphoma 2 protein to be made in larger amounts, which may keep cancer cells from dying. Also called BCL2.
  B-cell lymphoma: (…lim-FOH-muh)
    Pronunciation of dictionary term "B-cell lymphoma"
    A type of cancer that forms in B cells (a type of immune system cell). B-cell lymphomas may be either indolent (slow-growing) or aggressive (fast-growing). Most B-cell lymphomas are non-Hodgkin lymphomas. There are many different types of B-cell non-Hodgkin lymphomas. These include Burkitt lymphoma, chronic lymphocytic leukemia/small lymphocytic lymphoma (CLL/SLL), diffuse large B-cell lymphoma, follicular lymphoma, and mantle cell lymphoma. Prognosis and treatment depend on type and stage of the cancer.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  B3 monoclonal antibody: (… MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "B3 monoclonal antibody"
    A substance that binds to a molecule called Lewis Y antigen that is found on many types of tumor cells and some normal cells. It is being studied in the treatment of several types of cancer that express the Lewis Y antigen. It is a type of monoclonal antibody.
  B43-PAP immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "B43-PAP immunotoxin"
    A toxic substance linked to an antibody that attaches to tumor cells and kills them.
  B7-1: A protein found on the surface of some immune system cells, including B cells and monocytes. Cells with B7-1 on their surface cause T cells to make substances that help control immune responses. Also called CD80.
  bacillus Calmette-Guérin: (buh-SIH-lus KAL-met-gay-RIN)
    Pronunciation of dictionary term "bacillus Calmette-Guérin"
    A weakened form of the bacterium Mycobacterium bovis (bacillus Calmette-Guérin) that does not cause disease. Bacillus Calmette-Guérin is used in a solution to stimulate the immune system in the treatment of bladder cancer and as a vaccine to prevent tuberculosis. Also called BCG.
  bacillus Calmette-Guérin solution: (buh-SIH-lus KAL-met-gay-RIN suh-LOO-shun)
    Pronunciation of dictionary term "bacillus Calmette-Guérin solution"
    A type of biologic therapy used to treat early stage bladder cancer. The solution is made from a weakened form of a bacterium called Mycobacterium bovis (bacillus Calmette-Guérin) that does not cause disease. It is given through a catheter that is placed into the bladder where the solution is held for about two hours. Bacillus Calmette-Guérin solution may help the body’s immune system kill cancer cells. Also called BCG solution.
  bacillus Calmette-Guérin vaccine: (buh-SIH-lus KAL-met-gay-RIN vak-SEEN)
    Pronunciation of dictionary term "bacillus Calmette-Guérin vaccine"
    A vaccine used to prevent tuberculosis (TB) in people who are at a high risk of TB or where TB is common. It is rarely given in the U.S. It is made from a weakened form of a bacterium called Mycobacterium bovis (bacillus Calmette-Guérin), which is similar to the bacteria that cause TB. The vaccine may help the body’s immune system make antibodies to destroy the TB bacteria. It also may help the immune system kill cancer cells and is being studied in the treatment of melanoma. Also called BCG vaccine.
  backbone: (BAK-bone)
    Pronunciation of dictionary term "backbone"
    The bones, muscles, tendons, and other tissues that reach from the base of the skull to the tailbone. The backbone encloses the spinal cord and the fluid surrounding the spinal cord. Also called spinal column, spine, and vertebral column.
    Anatomy of the spine. The spine is made up of bones, muscles, tendons, nerves, and other tissues that reach from the base of the skull near the spinal cord (clivus) to the coccyx (tailbone). The vertebrae (back bones) of the spine include the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the tailbone. Each vertebra is separated by a disc. The vertebrae surround and protect the spinal cord. The spinal cord is divided into segments, each containing a pair of spinal nerves that send messages between the brain and the rest of the body. Many spinal nerves extend beyond the conus medullaris (the end of the spinal cord) to form a bundle of nerves called the cauda equina.
    Anatomy of the spine; drawing shows a side view of the spine, including the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the coccyx (tailbone). Also shown are the spinal cord, vertebra (back bone), conus medullaris (the end of the spinal cord), cauda equina (the bundle of spinal nerves that extend beyond the conus medullaris), and a lumbar disc. The clivus (a bone at the base of the skull near the spinal cord) is also shown.
  baclofen: (BAK-loh-fen)
    Pronunciation of dictionary term "baclofen"
    A drug that is used to treat certain types of muscle spasms and is being studied in the treatment of liver cancer. Baclofen relaxes muscles by blocking certain nerve receptors in the spinal cord. It is a type of antispasmodic. Also called Kemstro and Lioresal.
  baclofen/amitriptyline/ketamine gel: (BAK-loh-fen A-mih-TRIP-tih-leen KEE-tuh-meen jel)
    Pronunciation of dictionary term "baclofen/amitriptyline/ketamine gel"
    A substance being studied in the treatment of peripheral neuropathy (pain, numbness, tingling, burning, or weakness in the hands or feet) caused by chemotherapy. It contains three drugs, baclofen, amitriptyline, and ketamine, that relax muscles by blocking nerve receptors. The gel is applied to the skin of affected areas. It is a type of analgesic. Also called BAK gel.
  bacteria: (bak-TEER-ee-uh)
    Pronunciation of dictionary term "bacteria"
    A large group of single-cell microorganisms. Some cause infections and disease in animals and humans. The singular of bacteria is bacterium.
  bacterial toxin: (bak-TEER-ee-ul TOK-sin)
    Pronunciation of dictionary term "bacterial toxin"
    A harmful substance made by bacteria that can cause illness. Bacterial toxins can also be made in the laboratory and attached to monoclonal antibodies that bind to cancer cells. These toxins may help kill cancer cells without harming normal cells.
  BAER test: (... test)
    Pronunciation of dictionary term "BAER test"
    A test used to detect some types of hearing loss, such as hearing loss caused by injury or tumors that affect nerves involved in hearing. Electrodes are placed on the head and certain tones or clicking sounds are made. The electrodes measure nerve signals in the brain when it reacts to the sounds. Also called ABR test, auditory brain stem response test, and brain stem auditory evoked response test.
    More Information
    - Langerhans Cell Histiocytosis Treatment
  BAK gel: (… jel)
    Pronunciation of dictionary term "BAK gel"
    A substance being studied in the treatment of peripheral neuropathy (pain, numbness, tingling, burning, or weakness in the hands or feet) caused by chemotherapy. It contains three drugs, baclofen, amitriptyline, and ketamine, that relax muscles by blocking nerve receptors. The gel is applied to the skin of affected areas. It is a type of analgesic. Also called baclofen/amitriptyline/ketamine gel.
  balloon angioplasty: (buh-LOON AN-jee-oh-PLAS-tee)
    Pronunciation of dictionary term "balloon angioplasty"
    A procedure to enlarge the opening in a blood vessel that has become narrowed or blocked by plaque (a buildup of fat and cholesterol on the inner wall of the blood vessel). A small balloon is filled with air inside the blood vessel to push the plaque against the blood vessel wall and increase the opening.
  balloon catheter radiation: (buh-LOON KA-theh-ter RAY-dee-AY-shun)
    Pronunciation of dictionary term "balloon catheter radiation"
    A system used to deliver internal radiation therapy to breast cancer patients after surgery to remove their cancer. Balloon catheter radiation targets only the part of the breast where the cancer was found. After a patient has had a lumpectomy to remove the cancer, a small balloon on the end of a catheter (thin tube) is inserted into the empty space left by the surgery. The balloon is then filled with liquid and left in place. Using the catheter, radioactive seeds are put into the balloon twice a day for five days and removed each time. Once treatment has ended, the catheter and balloon are removed. Balloon catheter radiation is a type of intracavitary brachytherapy and partial breast irradiation therapy (PBRT). Also called MammoSite.
  Balversa: (bal-VER-suh)
    Pronunciation of dictionary term "Balversa"
    A drug used to treat adults with urothelial cancer (a type of bladder or urinary tract cancer) that has spread and has an abnormal FGFR3 gene. It is used in patients whose cancer got worse during or after treatment with at least one type of systemic therapy. It is also being studied in the treatment of other types of cancer. Balversa blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called erdafitinib.
    More Information
    - Erdafitinib (https://www.cancer.gov/about-cancer/treatment/drugs/erdafitinib)
  bankruptcy: (BANK-rup-see)
    Pronunciation of dictionary term "bankruptcy"
    The situation that occurs when a person or business is not able to pay back debts. Filing for bankruptcy is a legal process that is handled by a U.S. federal court. This process can help people get rid of their debt or reduce their debt through a repayment plan. Certain events, such as job loss, divorce, a long illness, or hospitalization, can affect a person’s ability to pay bills and lead to debt and bankruptcy. Filing for bankruptcy helps people get a fresh start financially, but it also affects their ability to borrow money or have credit in the future.
  BAP1 gene: (… jeen)
    Pronunciation of dictionary term "BAP1 gene"
    A gene that makes a protein involved in controlling cell growth, division, and death. This protein may also play a role in repairing damaged DNA and controlling the activity of certain genes. Mutations (changes) in the BAP1 gene may cause abnormal cells, including cancer cells, to grow and spread in the body. BAP1 gene mutations have been found in an inherited condition called BAP1 tumor predisposition syndrome, which causes an increased risk of some types of cancer, including cancers of the skin, eye, kidney, bile duct, and mesothelium (the tissue that lines the chest and abdomen). The BAP1 gene is a type of tumor suppressor gene.
    More Information
    - BAP1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/bap1/)
  BAP1 tumor predisposition syndrome: (… TOO-mer PREE-dih-spuh-ZIH-shun SIN-drome)
    Pronunciation of dictionary term "BAP1 tumor predisposition syndrome"
    A rare inherited disorder that is caused by mutations (changes) in the BAP1 gene. Having this mutation increases the risk of developing certain types of cancerous tumors of the skin, eye, kidney, and mesothelium (the tissue that lines the chest and abdomen). The cancers tend to develop at an early age, are often fast-growing, and are more likely to spread to other parts of the body. Benign (not cancer) tumors of the skin may also occur. Not all people who have a mutation in the BAP1 gene will develop tumors.
    More Information
    - BAP1 tumor predisposition syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/13219/bap1-tumor-predisposition-syndrome)
    - BAP1 tumor predisposition syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/bap1-tumor-predisposition-syndrome/)
  barbiturate: (bar-BIH-chuh-rayt)
    Pronunciation of dictionary term "barbiturate"
    A type of drug that causes a decrease in brain activity. Barbiturates may be used to treat insomnia, seizures, and convulsions, and to relieve anxiety and tension before surgery. A barbiturate is a type of central nervous system (CNS) depressant.
  bariatric surgery: (BAYR-ee-A-trik SER-juh-ree)
    Pronunciation of dictionary term "bariatric surgery"
    Surgery done to help people who are obese lose weight. There are different types of bariatric surgery, and each type changes the way the digestive system works. Some types make the stomach smaller, which decreases the amount of food that it can hold so the person feels full sooner and eats less. Other types make changes to the stomach and the small intestine, which decreases the nutrients and calories that are absorbed from food. Bariatric surgery can improve many obesity-related health problems, such as diabetes, high blood pressure, unhealthy cholesterol levels, sleep apnea, and knee, hip, or other body pain. Having bariatric surgery may also decrease the risk of some cancers, including endometrial cancer. Also called weight loss surgery.
    More Information
    - Obesity and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity/obesity-fact-sheet)
  barium enema: (BAYR-ee-um EH-neh-muh)
    Pronunciation of dictionary term "barium enema"
    A procedure in which a liquid that contains barium sulfate is put through the anus into the rectum and colon. Barium sulfate is a silver-white metallic compound that helps show pictures of the colon, rectum, and anus on an x-ray.
    Barium enema procedure. The patient lies on an x-ray table. Barium liquid is put into the rectum and flows through the colon. X-rays are taken to look for abnormal areas.
    Barium enema procedure; shows barium liquid being put into the rectum and flowing through the colon. Inset shows person on table having a barium enema.
  barium solution: (BAYR-ee-um suh-LOO-shun)
    Pronunciation of dictionary term "barium solution"
    A liquid that contains barium sulfate (a form of the silver-white metallic element barium). It is used to show pictures of parts of the digestive system in x-rays.
  barium sulfate: (BAYR-ee-um SUL-fayt)
    Pronunciation of dictionary term "barium sulfate"
    A silver-white metallic compound made from the mineral barite. It is mixed with water and used in barium swallows and barium enemas to help show parts of the digestive system on an x-ray.
  barium swallow: (BAYR-ee-um SWAH-loh)
    Pronunciation of dictionary term "barium swallow"
    A series of x-ray pictures of the upper gastrointestinal (GI) tract, including the throat, esophagus, stomach, and the first part of the small intestine (duodenum). The x-ray pictures are taken after the patient drinks a liquid that contains barium sulfate (a silver-white metallic compound). The barium sulfate coats and outlines the inner walls of the upper GI tract so they can be seen on the x-ray pictures. Also called upper gastrointestinal series and upper GI series.
    Barium swallow for esophageal cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as esophageal cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. The inset x-ray image shows a narrowing at the end of the esophagus caused by cancer.
    Barium swallow for stomach cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as stomach cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. Also shown is cancer in the stomach.
  barium-meal photofluorography: (BAYR-ee-um … FOH-toh-floor-AH-gruh-fee)
    Pronunciation of dictionary term "barium-meal photofluorography"
    A procedure that uses x-rays to take a series of pictures of the esophagus, stomach, and duodenum (the first part of the small intestine). The x-ray pictures are taken after the patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inner walls of the esophagus, stomach, and duodenum so they can be seen on the x-ray pictures. Photographs are then taken of the x-ray images and made into a short film to make the organs easier to see. This makes it possible to see the motion of the organs and exposes the patient to less radiation.
  Barrett esophagus: (BAYR-et ee-SAH-fuh-gus)
    Pronunciation of dictionary term "Barrett esophagus"
    A condition in which the cells lining the lower part of the esophagus have changed or been replaced with abnormal cells that could lead to cancer of the esophagus. The backing up of stomach contents (reflux) may irritate the esophagus and, over time, cause Barrett esophagus.
    More Information
    - Esophageal Cancer Prevention
  barrier: (BAYR-ee-er)
    Pronunciation of dictionary term "barrier"
    Something that blocks, prevents, separates, or limits.
  basal cell: (BAY-sul sel)
    Pronunciation of dictionary term "basal cell"
    A small, round cell found in the lower part (or base) of the epidermis, the outer layer of the skin.
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  basal cell cancer: (BAY-sul sel KAN-ser)
    Pronunciation of dictionary term "basal cell cancer"
    Cancer that begins in the lower part of the epidermis (the outer layer of the skin). It may appear as a small white or flesh-colored bump that grows slowly and may bleed. Basal cell cancers are usually found on areas of the body exposed to the sun. Basal cell cancers rarely metastasize (spread) to other parts of the body. They are the most common form of skin cancer. Also called basal cell carcinoma.
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  basal cell carcinoma: (BAY-sul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "basal cell carcinoma"
    Cancer that begins in the lower part of the epidermis (the outer layer of the skin). It may appear as a small white or flesh-colored bump that grows slowly and may bleed. Basal cell carcinomas are usually found on areas of the body exposed to the sun. Basal cell carcinomas rarely metastasize (spread) to other parts of the body. They are the most common form of skin cancer. Also called basal cell cancer.
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  basal cell nevus syndrome: (BAY-sul sel NEE-vus SIN-drome)
    Pronunciation of dictionary term "basal cell nevus syndrome"
    A rare, inherited disorder that affects many organs and tissues in the body. People with this disorder have a very high risk of developing basal cell skin cancer during adolescence or early adulthood. They are also at risk of developing medulloblastoma (a type of brain cancer) and other types of cancer. Basal cell nevus syndrome may also cause benign (not cancer) tumors in the jaw, heart, or ovaries. Other signs and symptoms include a large head and unusual facial features; small pits in the skin on the hands and feet; abnormalities of the spine, ribs, or skull; eye problems; and developmental problems. Basal cell nevus syndrome is caused by a mutation (change) in the PTCH1 gene. Also called BCNS, Gorlin syndrome, NBCCS, and nevoid basal cell carcinoma syndrome.
    More Information
    - Nevoid basal cell carcinoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7166/basal-cell-nevus-syndrome)
    - Gorlin syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/gorlin-syndrome/)
    Basal cell carcinoma. A skin cancer lesion that looks reddish brown and slightly raised (left panel) and a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
    Photographs showing a skin cancer lesion that looks reddish brown and slightly raised (left panel) and the back of a person’s ear with a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
  base: (bays)
    Pronunciation of dictionary term "base"
    In chemistry, a substance that can accept hydrogen ions in water and can neutralize an acid. Bases feel soapy or slippery on the skin and they can turn certain dyes blue. An example of a base is sodium hydroxide. Basicity is measured on a scale called the pH scale. On this scale, a pH value of 7 is neutral, and a pH value of more than 7 to 14 shows increasing basicity.
  base pair: (bays payr)
    Pronunciation of dictionary term "base pair"
    Molecules called nucleotides, on opposite strands of the DNA double helix, that form chemical bonds with one another. These chemical bonds act like rungs in a ladder and help hold the two strands of DNA together. There are four nucleotides, or bases, in DNA: adenine (A), cytosine (C), guanine (G), and thymine (T). These bases form specific pairs (A with T, and G with C).
    More Information
    - Base Pair (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Base-Pair)
    DNA base pair. Under normal circumstances, the nitrogen-containing bases adenine (A) and thymine (T) pair together, and cytosine (C) and guanine (G) pair together. The binding of these base pairs forms the structure of DNA .
    DNA base pair; drawing shows double-stranded DNA with bonds between two pairs of nitrogen-containing bases [adenine (A) and thymine (T), and cytosine (C) and guanine (G)].
    DNA base pair. Under normal circumstances, the nitrogen-containing bases adenine (A) and thymine (T) pair together, and cytosine (C) and guanine (G) pair together. The binding of these base pairs forms the structure of DNA.
    DNA base pair; drawing shows double-stranded DNA with bonds between two pairs of nitrogen-containing bases [adenine (A) and thymine (T), and cytosine (C) and guanine (G)].
  baseline: (BAYS-line)
    Pronunciation of dictionary term "baseline"
    An initial measurement of a condition that is taken at an early time point and used for comparison over time to look for changes. For example, the size of a tumor will be measured before treatment (baseline) and then afterwards to see if the treatment had an effect.
  basicity: (bay-SIH-sih-tee)
    Pronunciation of dictionary term "basicity"
    In chemistry, the quality of being a base (not an acid). A base is a substance that can accept hydrogen ions in water and can neutralize an acid. Basicity is measured on a scale called the pH scale. On this scale, a pH value of 7 is neutral, and a pH value of more than 7 to 14 shows increasing basicity.
  basket trial: (BAS-ket TRY-ul)
    Pronunciation of dictionary term "basket trial"
    A type of clinical trial that tests how well a new drug or other substance works in patients who have different types of cancer that all have the same mutation or biomarker. In basket trials, patients all receive the same treatment that targets the specific mutation or biomarker found in their cancer. Basket trials may allow new drugs to be tested and approved more quickly than traditional clinical trials. Basket trials may also be useful for studying rare cancers and cancers with rare genetic changes. Also called bucket trial.
  basophil: (BAY-soh-fil)
    Pronunciation of dictionary term "basophil"
    A type of immune cell that has granules (small particles) with enzymes that are released during allergic reactions and asthma. A basophil is a type of white blood cell and a type of granulocyte.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  batimastat: (ba-TIH-muh-stat)
    Pronunciation of dictionary term "batimastat"
    An anticancer drug that belongs to the family of drugs called angiogenesis inhibitors. Batimastat is a matrix metalloproteinase inhibitor.
  batracylin: (BA-truh-SY-lin)
    Pronunciation of dictionary term "batracylin"
    A substance being studied in the treatment of cancer. It may kill cancer cells by causing damage to the DNA. Batracylin is a type of heterocyclic aryl amine.
  Bavencio: (buh-VEN-see-oh)
    Pronunciation of dictionary term "Bavencio"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Bavencio is used alone or with other drugs to treat certain types of advanced renal cell carcinoma (a type of kidney cancer), urothelial cancer (a type of cancer in the bladder or urinary tract), and Merkel cell carcinoma (a rare type of skin cancer). It is also being studied in the treatment of other types of cancer. Bavencio may block PD-L1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called avelumab.
    More Information
    - Avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab)
  bavituximab: (ba-vih-TUK-sih-mab)
    Pronunciation of dictionary term "bavituximab"
    A substance being studied in the treatment of several types of cancer and infections caused by certain viruses. It binds to substances on the surface of tumor cells, certain viruses, and cells infected with a virus. The immune system detects bavituximab on the cells and the viruses and may destroy them. It is a type of monoclonal antibody and a type of targeted therapy agent. Also called Tarvacin.
  BAY 12-9566: An anticancer drug that belongs to the family of drugs called angiogenesis inhibitors.
  BAY 43-9006: A drug used to treat certain types of hepatocellular carcinoma (a type of liver cancer), renal cell carcinoma (a type of kidney cancer), and thyroid cancer. It is also being studied in the treatment of other types of cancer. BAY 43-9006 blocks certain proteins, which may help keep cancer cells from growing and dividing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. BAY 43-9006 is a type of kinase inhibitor and a type of antiangiogenesis agent. Also called Nexavar and sorafenib tosylate.
    More Information
    - Sorafenib Tosylate (https://www.cancer.gov/about-cancer/treatment/drugs/sorafenibtosylate)
  BAY 56-3722: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called camptothecins.
  BAY 59-8862: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called taxanes.
  Bazex-Dupré-Christol syndrome: (BA-zex-doo-PRAY-kris-TOL SIN-drome)
    Pronunciation of dictionary term "Bazex-Dupré-Christol syndrome"
    A very rare, inherited disorder that affects the hair follicles on the scalp and other areas of the body where hair normally grows. There is little or no hair growth in the affected areas, and the hair may be lighter in color, course in texture, and appear flat and twisted when looked at under a microscope. Other signs and symptoms include little or no sweating; small white bumps or cysts on the face, tops of the hands and feet, the back of the elbow, and the front of the knee; and other skin problems. The signs and symptoms usually appear at birth or during infancy. People with Bazex-Dupré-Christol syndrome have an increased risk of developing basal cell skin cancer at an early age, especially on the face. Bazex-Dupré-Christol syndrome may be caused by a mutation (change) in the UBE2A gene on the X chromosome. Also called BDCS.
    More Information
    - Bazex-Dupre-Christol syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/838/bazex-dupre-christol-syndrome)
  BB-10901: A substance being studied in the treatment of some types of cancer, including Wilms tumor, neuroblastoma, rhabdomyosarcoma, and other types of soft tissue sarcoma. BB-10901 contains a monoclonal antibody that binds to a protein called CD56 on some types of cancer cells. It also contains an anticancer drug called DM1, which may help kill cancer cells after BB-10901 binds to them. BB-10901 is a type of antibody-drug conjugate. Also called lorvotuzumab mertansine.
  BBB: A network of blood vessels and tissue that is made up of closely spaced cells and helps keep harmful substances from reaching the brain. The BBB lets some substances, such as water, oxygen, carbon dioxide, and general anesthetics, pass into the brain. It also keeps out bacteria and other substances, such as many anticancer drugs. Also called blood-brain barrier.
  BBBD: The use of drugs to create openings between cells in the blood-brain barrier. The blood-brain barrier is a protective network of blood vessels and tissue that protects the brain from harmful substances, but can also prevent anticancer drugs from reaching the brain. Once the barrier is opened, anticancer drugs may be infused into an artery that goes to the brain, in order to treat brain tumors. Also called blood-brain barrier disruption.
  BBD: A group of conditions marked by changes in breast tissue that are not cancer but may become cancer. Types of BBD include atypical ductal hyperplasia, atypical lobular hyperplasia, lobular carcinoma in situ, and complex sclerosing lesion (radial scar). Having BBD increases the risk of breast cancer. Also called borderline breast disease.
  BBIC: A substance that is made from soybeans and is being studied in the prevention of cancer. It blocks the action of enzymes that are needed for cancer cells to form. It is a type of protease inhibitor. Also called Bowman-Birk inhibitor concentrate.
  BBR 2778: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called antitumor antibiotics. Also called pixantrone.
  BBR 3464: A substance that is being studied in the treatment of cancer. It belongs to the family of platinum-based drugs.
  BCG: A weakened form of the bacterium Mycobacterium bovis (bacillus Calmette-Guérin) that does not cause disease. BCG is used in a solution to stimulate the immune system in the treatment of bladder cancer and as a vaccine to prevent tuberculosis. Also called bacillus Calmette-Guérin.
  BCG solution: (… suh-LOO-shun)
    Pronunciation of dictionary term "BCG solution"
    A type of biologic therapy used to treat early stage bladder cancer. The solution is made from a weakened form of a bacterium called Mycobacterium bovis (bacillus Calmette-Guérin) that does not cause disease. It is given through a catheter that is placed into the bladder where the solution is held for about two hours. BCG solution may help the body’s immune system kill cancer cells. Also called bacillus Calmette-Guérin solution.
  BCG vaccine: (... vak-SEEN)
    Pronunciation of dictionary term "BCG vaccine"
    A vaccine used to prevent tuberculosis (TB) in people who are at a high risk of TB or where TB is common. It is rarely given in the U.S. It is made from a weakened form of a bacterium called Mycobacterium bovis (bacillus Calmette-Guérin), which is similar to the bacteria that cause TB. The vaccine may help the body’s immune system make antibodies to destroy the TB bacteria. It also may help the immune system kill cancer cells and is being studied in the treatment of melanoma. Also called bacillus Calmette-Guérin vaccine.
  bcl-2 antisense oligodeoxynucleotide G3139: (... AN-tee-sents AH-lih-goh-dee-OK-see-NOO-klee-oh-tide ...)
    Pronunciation of dictionary term "bcl-2 antisense oligodeoxynucleotide G3139"
    A substance being studied in the treatment of cancer. It may kill cancer cells by blocking the production of a protein that makes cancer cells live longer and by making them more sensitive to anticancer drugs. It is a type of antisense oligodeoxyribonucleotide. Also called augmerosen, Genasense, and oblimersen sodium.
  BCL2: A protein that helps control whether a cell lives or dies by blocking a type of cell death called apoptosis. The gene for BCL2 is found on chromosome 18, and transfer of the BCL2 gene to a different chromosome is seen in many B-cell leukemias and lymphomas. This causes the BCL2 protein to be made in larger amounts, which may keep cancer cells from dying. Also called B-cell leukemia/lymphoma 2 protein.
  BCNS: A rare, inherited disorder that affects many organs and tissues in the body. People with this disorder have a very high risk of developing basal cell skin cancer during adolescence or early adulthood. They are also at risk of developing medulloblastoma (a type of brain cancer) and other types of cancer. BCNS may also cause benign (not cancer) tumors in the jaw, heart, or ovaries. Other signs and symptoms include a large head and unusual facial features; small pits in the skin on the hands and feet; abnormalities of the spine, ribs, or skull; eye problems; and developmental problems. BCNS is caused by a mutation (change) in the PTCH1 gene. Also called basal cell nevus syndrome, Gorlin syndrome, NBCCS, and nevoid basal cell carcinoma syndrome.
    More Information
    - Nevoid basal cell carcinoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7166/basal-cell-nevus-syndrome)
    - Gorlin syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/gorlin-syndrome/)
    Basal cell carcinoma. A skin cancer lesion that looks reddish brown and slightly raised (left panel) and a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
    Photographs showing a skin cancer lesion that looks reddish brown and slightly raised (left panel) and the back of a person’s ear with a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
  BCNU: A drug used alone or with other drugs to treat certain types of brain tumors, Hodgkin lymphoma, and non-Hodgkin lymphoma and with prednisone to treat multiple myeloma. It is also being studied in the treatment of other types of cancer. BCNU damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea. Also called BiCNU and carmustine.
    More Information
    - Carmustine (https://www.cancer.gov/about-cancer/treatment/drugs/carmustine)
  BCOP: A licensed pharmacist with special training in how to design, give, monitor, and change chemotherapy for cancer patients. Also called board certified oncology pharmacy specialist and oncology pharmacy specialist.
  BCR-ABL1 fusion gene: (... FYOO-zhun jeen)
    Pronunciation of dictionary term "BCR::ABL1 fusion gene"
    A gene formed when pieces of chromosomes 9 and 22 break off and trade places. The ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR-ABL1 fusion gene. The changed chromosome 22 with the fusion gene on it is called the Philadelphia chromosome. The BCR-ABL1 fusion gene is found in most people with chronic myelogenous leukemia, and in some people with acute lymphoblastic leukemia or acute myelogenous leukemia. Also called BCR::ABL1 fusion gene.
    The Philadelphia (Ph) chromosome is an abnormal chromosome that is made when pieces of chromosomes 9 and 22 break off and trade places. The ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the fusion gene on it is called the Ph chromosome.
    Philadelphia chromosome; three-panel drawing shows a piece of chromosome 9 and a piece of chromosome 22 breaking off and trading places, creating a changed chromosome 22 called the Philadelphia chromosome. In the left panel, the drawing shows a normal chromosome 9 with the ABL1 gene and a normal chromosome 22 with the BCR gene. In the center panel, the drawing shows part of the ABL1 gene breaking off from chromosome 9 and a piece of chromosome 22 breaking off, below the BCR gene. In the right panel, the drawing shows chromosome 9 with the piece from chromosome 22 attached. It also shows a shortened version of chromosome 22 with the piece from chromosome 9 containing part of the ABL1 gene attached. The ABL1 gene joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the BCR::ABL1 fusion gene on it is called the Philadelphia chromosome.
  BCR-ABL1 fusion protein: (... FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "BCR::ABL1 fusion protein"
    A protein made from pieces of two genes that get joined together. The BCR-ABL1 fusion protein is found in most people with chronic myelogenous leukemia, and in some people with acute lymphoblastic leukemia or acute myelogenous leukemia. Inside the leukemia cells, the ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR-ABL1 fusion gene, which makes the BCR-ABL1 fusion protein. Also called BCR::ABL1 fusion protein.
  BCR::ABL1 fusion gene: (... FYOO-zhun jeen)
    Pronunciation of dictionary term "BCR::ABL1 fusion gene"
    A gene formed when pieces of chromosomes 9 and 22 break off and trade places. The ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the fusion gene on it is called the Philadelphia chromosome. The BCR::ABL1 fusion gene is found in most people with chronic myelogenous leukemia, and in some people with acute lymphoblastic leukemia or acute myelogenous leukemia. Also called BCR-ABL1 fusion gene.
    The Philadelphia (Ph) chromosome is an abnormal chromosome that is made when pieces of chromosomes 9 and 22 break off and trade places. The ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the fusion gene on it is called the Ph chromosome.
    Philadelphia chromosome; three-panel drawing shows a piece of chromosome 9 and a piece of chromosome 22 breaking off and trading places, creating a changed chromosome 22 called the Philadelphia chromosome. In the left panel, the drawing shows a normal chromosome 9 with the ABL1 gene and a normal chromosome 22 with the BCR gene. In the center panel, the drawing shows part of the ABL1 gene breaking off from chromosome 9 and a piece of chromosome 22 breaking off, below the BCR gene. In the right panel, the drawing shows chromosome 9 with the piece from chromosome 22 attached. It also shows a shortened version of chromosome 22 with the piece from chromosome 9 containing part of the ABL1 gene attached. The ABL1 gene joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the BCR::ABL1 fusion gene on it is called the Philadelphia chromosome.
  BCR::ABL1 fusion protein: (... FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "BCR::ABL1 fusion protein"
    A protein made from pieces of two genes that get joined together. The BCR::ABL1 fusion protein is found in most people with chronic myelogenous leukemia, and in some people with acute lymphoblastic leukemia or acute myelogenous leukemia. Inside the leukemia cells, the ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene, which makes the BCR::ABL1 fusion protein. Also called BCR-ABL1 fusion protein.
  BCRP: A protein that is involved in making cancer cells resistant (unable to respond) to anticancer drugs. Normally, BCRP works with other proteins to help move many different substances, including drugs and other chemicals, in and out of cells. It is found in stem cells and in normal tissues, including the intestine, liver, brain, and placenta. However, it may also be found in higher than normal amounts in some cancer cells, which can cause them to be unable to respond to certain anticancer drugs. Drugs that block BCRP are being studied in the treatment of some types of cancer. BCRP was first identified in breast cancer cells. Also called breast cancer resistance protein.
  BCX-1777: A substance being studied in the treatment of some types of leukemia and lymphoma. It is a type of purine nucleoside phosphorylase (PNP) inhibitor. Also called forodesine hydrochloride.
  BDC: A rare type of kidney cancer that grows and spreads quickly. It begins in the duct of Bellini in the kidney. Also called Bellini duct carcinoma.
  BDCS: A very rare, inherited disorder that affects the hair follicles on the scalp and other areas of the body where hair normally grows. There is little or no hair growth in the affected areas, and the hair may be lighter in color, course in texture, and appear flat and twisted when looked at under a microscope. Other signs and symptoms include little or no sweating; small white bumps or cysts on the face, tops of the hands and feet, the back of the elbow, and the front of the knee; and other skin problems. The signs and symptoms usually appear at birth or during infancy. People with BDCS have an increased risk of developing basal cell skin cancer at an early age, especially on the face. BDCS may be caused by a mutation (change) in the UBE2A gene on the X chromosome. Also called Bazex-Dupré-Christol syndrome.
    More Information
    - Bazex-Dupre-Christol syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/838/bazex-dupre-christol-syndrome)
  BEACOPP: An abbreviation for a chemotherapy combination used to treat advanced Hodgkin lymphoma. It includes the drugs bleomycin sulfate, etoposide phosphate, doxorubicin hydrochloride (Adriamycin), cyclophosphamide, vincristine sulfate (Oncovin), procarbazine hydrochloride, and prednisone. Also called BEACOPP regimen.
    More Information
    - BEACOPP (https://www.cancer.gov/about-cancer/treatment/drugs/BEACOPP)
  BEACOPP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "BEACOPP regimen"
    An abbreviation for a chemotherapy combination used to treat advanced Hodgkin lymphoma. It includes the drugs bleomycin sulfate, etoposide phosphate, doxorubicin hydrochloride (Adriamycin), cyclophosphamide, vincristine sulfate (Oncovin), procarbazine hydrochloride, and prednisone. Also called BEACOPP.
    More Information
    - BEACOPP (https://www.cancer.gov/about-cancer/treatment/drugs/BEACOPP)
  Beckwith-Wiedemann syndrome: (BEK-with-VEE-deh-mahn SIN-drome)
    Pronunciation of dictionary term "Beckwith-Wiedemann syndrome"
    A rare, overgrowth disorder in which babies are large at birth and may develop low blood sugar. Other common symptoms are a large tongue, large internal organs, and defects of the abdominal wall near the navel. Beckwith-Wiedemann syndrome increases the risk of developing certain cancers, especially Wilms tumor.
    More Information
    - Beckwith-Wiedemann syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3343/beckwith-wiedemann-syndrome)
    - Beckwith-Wiedemann syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/beckwith-wiedemann-syndrome/)
  beclin 1: (BEH-klin …)
    Pronunciation of dictionary term "beclin 1"
    A protein involved in autophagy (the process by which a cell destroys proteins and other substances in its cytoplasm). Beclin 1 is found at lower levels in several types of cancer cells than in normal cells. It is a type of tumor suppressor.
  beclomethasone: (beh-kloh-MEH-thuh-sone)
    Pronunciation of dictionary term "beclomethasone"
    A drug being studied in the treatment of graft-versus-host disease. It belongs to a family of drugs called corticosteroids.
  bedsore: (BED-sor)
    Pronunciation of dictionary term "bedsore"
    Damage to an area of the skin caused by constant pressure on the area for a long time. This pressure can lessen blood flow to the affected area, which may lead to tissue damage and tissue death. Bedsores often form on the skin covering bony areas of the body, such as the back, tailbone, hips, buttocks, elbows, heels, and ankles. Patients who are not able to get out of bed or change their position, or who always use a wheelchair have an increased risk of bedsores. Signs and symptoms include changes in skin color and swelling, warmth, tenderness, and pain in the affected area. If untreated, the skin may crack, blister, or break open and form a sore or ulcer, which may have pus-like drainage. Bedsores often heal slowly and if not treated can damage tissues deep under the skin, including fat, muscle, and bone. Also called decubitus ulcer, pressure sore, and pressure ulcer.
  behavior modification: (beh-HAY-vyer MAH-dih-fih-KAY-shun)
    Pronunciation of dictionary term "behavior modification"
    A technique used to help people change the way they react to certain triggers in the environment that cause a negative reaction. In cancer treatment, behavior modification may be used to help patients who have become nauseous during previous cancer treatments cope with nausea they feel when they enter the therapy room to begin a new round of treatment.
  Behçet disease: (beh-SHET dih-ZEEZ)
    Pronunciation of dictionary term "Behcet disease"
    A rare disorder that causes the blood vessels to become inflamed. Symptoms include sores in the mouth and on the sex organs and other skin problems, inflammation in parts of the eye, and pain, swelling, and stiffness of the joints. Other serious symptoms include blood clots, blindness, and inflammation of the brain, spinal cord, and digestive system. The symptoms may come and go on their own. Behçet disease is most common in young adults and its cause is unknown. Also called Behçet syndrome.
    More Information
    - Behçet disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/848/behcet-syndrome)
    - Behçet disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/behcet-disease/)
  Behçet syndrome: (beh-SHET SIN-drome)
    Pronunciation of dictionary term "Behcet syndrome"
    A rare disorder that causes the blood vessels to become inflamed. Symptoms include sores in the mouth and on the sex organs and other skin problems, inflammation in parts of the eye, and pain, swelling, and stiffness of the joints. Other serious symptoms include blood clots, blindness, and inflammation of the brain, spinal cord, and digestive system. The symptoms may come and go on their own. Behçet syndrome is most common in young adults and its cause is unknown. Also called Behçet disease.
    More Information
    - Behçet disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/848/behcet-syndrome)
    - Behçet disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/behcet-disease/)
  belantamab mafodotin: (beh-LAN-tuh-mab MA-foh-DOH-tin)
    Pronunciation of dictionary term "belantamab mafodotin"
    A drug used to treat adults with multiple myeloma that relapsed (came back) or did not get better after treatment with at least four other anticancer therapies, including an anti-CD38 monoclonal antibody, a proteasome inhibitor, and an immunomodulatory agent. Belantamab mafodotin contains a monoclonal antibody that binds to an antigen called BCMA, which is found on myeloma cells and some types of immune cells. It also contains an anticancer drug, which may help kill cancer cells. Belantamab mafodotin is a type of antibody-drug conjugate. Also called Blenrep.
    More Information
    - Belantamab Mafodotin-blmf
  belching: (BEL-ching)
    Pronunciation of dictionary term "belching"
    The release of air or gas from the stomach or esophagus through the mouth. Belching is usually caused by a buildup of air in the esophagus or upper part of the stomach when too much air is swallowed. This can occur when eating or drinking too fast, talking while eating, drinking carbonated drinks, chewing gum, smoking, or having an anxiety attack. Belching may also be a side effect of certain medicines or a symptom of some gastrointestinal conditions and digestive problems, such as gastroesophageal reflux disease, gastritis, and stomach ulcers or infections. Also called burping and eructation.
  Beleodaq: (BEE-lee-oh-dak)
    Pronunciation of dictionary term "Beleodaq"
    A drug used to treat adults with peripheral T-cell lymphoma that has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Beleodaq blocks certain enzymes needed for cell division and may kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow and may help make cancer cells easier to kill with other anticancer drugs. It is a type of histone deacetylase inhibitor, a type of antiangiogenesis agent, and a type of chemosensitizer. Also called belinostat and PXD101.
    More Information
    - Belinostat (https://www.cancer.gov/about-cancer/treatment/drugs/belinostat)
  belinostat: (beh-LIH-noh-stat)
    Pronunciation of dictionary term "belinostat"
    A drug used to treat adults with peripheral T-cell lymphoma that has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Belinostat blocks certain enzymes needed for cell division and may kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow and may help make cancer cells easier to kill with other anticancer drugs. It is a type of histone deacetylase inhibitor, a type of antiangiogenesis agent, and a type of chemosensitizer. Also called Beleodaq and PXD101.
    More Information
    - Belinostat (https://www.cancer.gov/about-cancer/treatment/drugs/belinostat)
  Bellini duct carcinoma: (beh-LEE-nee dukt KAR-sih-NOH-muh)
    Pronunciation of dictionary term "Bellini duct carcinoma"
    A rare type of kidney cancer that grows and spreads quickly. It begins in the duct of Bellini in the kidney. Also called BDC.
  belotecan: (BEH-loh-TEE-kun)
    Pronunciation of dictionary term "belotecan"
    The active ingredient in a substance being studied in the treatment of small cell lung cancer and other types of cancer. It blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of camptothecin analog and a type of topoisomerase inhibitor.
  belotecan hydrochloride: (BEH-loh-TEE-kun HY-droh-KLOR-ide)
    Pronunciation of dictionary term "belotecan hydrochloride"
    A substance being studied in the treatment of small cell lung cancer and other types of cancer. It blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of camptothecin analog and a type of topoisomerase inhibitor.
  Belrapzo: (bel-RAP-zoh)
    Pronunciation of dictionary term "Belrapzo"
    A drug used to treat chronic lymphocytic leukemia and certain types of non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Belrapzo damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called bendamustine hydrochloride, Bendeka, and Treanda.
    More Information
    - Bendamustine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/bendamustinehydrochloride)
  belzutifan: (bel-ZOO-tih-fan)
    Pronunciation of dictionary term "belzutifan"
    A drug used to treat adults with renal cell carcinoma (a type of kidney cancer) that is advanced and adults with certain cancers linked to von Hippel-Lindau disease that do not need surgery right away, including renal cell carcinoma, central nervous system hemangioblastoma (a type of blood vessel tumor), and pancreatic neuroendocrine tumor. It is also being studied in the treatment of other types of cancer. Belzutifan blocks a certain protein, which may help keep tumor cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Also called Welireg.
    More Information
    - Belzutifan (https://www.cancer.gov/about-cancer/treatment/drugs/belzutifan)
  Bence Jones protein: (bents jones PROH-teen)
    Pronunciation of dictionary term "Bence Jones protein"
    A small protein made by plasma cells (white blood cells that produce antibodies). It is found in the urine of most people with multiple myeloma (cancer that begins in plasma cells).
  bench-to-bedside: (bench ... BED-side)
    Pronunciation of dictionary term "bench-to-bedside"
    A term used to describe the process by which the results of research done in the laboratory are directly used to develop new ways to treat patients.
  bendamustine: (BEN-duh-MUS-teen)
    Pronunciation of dictionary term "bendamustine"
    The active ingredient in a drug used to treat chronic lymphocytic leukemia (CLL). It is also used to treat slow-growing B-cell non-Hodgkin lymphoma (NHL) that got worse during or within 6 months after treatment with rituximab. It is also being studied in the treatment of other types of cancer. Bendamustine damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent.
  bendamustine hydrochloride: (BEN-duh-MUS-teen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "bendamustine hydrochloride"
    A drug used to treat chronic lymphocytic leukemia and certain types of non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Bendamustine hydrochloride damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Belrapzo, Bendeka, and Treanda.
    More Information
    - Bendamustine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/bendamustinehydrochloride)
  Bendeka: (ben-DEH-kuh)
    Pronunciation of dictionary term "Bendeka"
    A drug used to treat chronic lymphocytic leukemia and certain types of non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Bendeka damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Belrapzo, bendamustine hydrochloride, and Treanda.
    More Information
    - Bendamustine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/bendamustinehydrochloride)
  benign: (beh-NINE)
    Pronunciation of dictionary term "benign"
    Not cancer. Benign tumors may grow larger but do not spread to other parts of the body. Also called nonmalignant.
  benign breast disease: (beh-NINE brest dih-ZEEZ)
    Pronunciation of dictionary term "benign breast disease"
    A group of conditions marked by changes in breast tissue that are benign (not cancer). There are different types of benign breast disease, including some types caused by an increase in the number of cells or by the growth of abnormal cells in the breast ducts or lobes. Signs and symptoms of benign breast disease include irregular lumps or cysts, breast swelling or discomfort, skin redness or thickening, and nipple discharge. Most benign breast conditions do not increase the risk of breast cancer. Also called mammary dysplasia.
  benign proliferative breast disease: (beh-NINE proh-LIH-feh-ruh-tiv brest dih-ZEEZ)
    Pronunciation of dictionary term "benign proliferative breast disease"
    A group of noncancerous conditions marked by an increase in the growth of certain cells in the breast. Having one of these conditions may increase the risk of breast cancer. Examples include ductal hyperplasia, lobular hyperplasia, and papillomas.
  benign prostatic hyperplasia: (beh-NINE prah-STA-tik HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "benign prostatic hyperplasia"
    A benign (not cancer) condition in which the prostate gland is larger than normal. As the prostate gets bigger, it may press against the bladder and urethra, which can slow or block the flow of urine from the bladder. This can cause urinary symptoms, such as feeling a need to urinate often or right away, waking up many times during the night to urinate, trouble urinating, leaking urine, pain during urination or after ejaculation (the release of semen through the penis during orgasm), and blood in the urine. Benign prostatic hyperplasia does not increase a person’s risk of developing prostate cancer. However, if not treated, it can lead to a weak bladder, urinary retention, urinary tract infections, bladder stones, or bladder or kidney damage. Benign prostatic hyperplasia is most common in older men. Also called benign prostatic hypertrophy, BPH, and enlarged prostate.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
    Normal prostate and benign prostatic hyperplasia (BPH). A normal prostate does not block the flow of urine from the bladder. An enlarged prostate presses on the bladder and urethra and blocks the flow of urine.
    Two-panel drawing shows normal male reproductive and urinary anatomy and benign prostatic hyperplasia (BPH). Panel on the left shows the normal prostate and flow of urine from the bladder through the urethra. Panel on the right shows an enlarged prostate pressing on the bladder and urethra, blocking the flow of urine.
  benign prostatic hypertrophy: (beh-NINE prah-STA-tik hy-PER-troh-fee)
    Pronunciation of dictionary term "benign prostatic hypertrophy"
    A benign (not cancer) condition in which the prostate gland is larger than normal. As the prostate gets bigger, it may press against the bladder and urethra, which can slow or block the flow of urine from the bladder. This can cause urinary symptoms, such as feeling a need to urinate often or right away, waking up many times during the night to urinate, trouble urinating, leaking urine, pain during urination or after ejaculation (the release of semen through the penis during orgasm), and blood in the urine. Benign prostatic hypertrophy does not increase a person’s risk of developing prostate cancer. However, if not treated, it can lead to a weak bladder, urinary retention, urinary tract infections, bladder stones, or bladder or kidney damage. Benign prostatic hypertrophy is most common in older men. Also called benign prostatic hyperplasia, BPH, and enlarged prostate.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
    Normal prostate and benign prostatic hyperplasia (BPH). A normal prostate does not block the flow of urine from the bladder. An enlarged prostate presses on the bladder and urethra and blocks the flow of urine.
    Two-panel drawing shows normal male reproductive and urinary anatomy and benign prostatic hyperplasia (BPH). Panel on the left shows the normal prostate and flow of urine from the bladder through the urethra. Panel on the right shows an enlarged prostate pressing on the bladder and urethra, blocking the flow of urine.
  benign tumor: (beh-NINE TOO-mer)
    Pronunciation of dictionary term "benign tumor"
    A growth that is not cancer. It does not invade nearby tissue or spread to other parts of the body.
  benign vascular tumor: (beh-NINE VAS-kyoo-ler TOO-mer)
    Pronunciation of dictionary term "benign vascular tumor"
    A type of benign (not cancer) tumor that forms from cells that make blood vessels or lymph vessels. Benign vascular tumors may occur anywhere in the body, and a patient may have several tumors in different parts of the body. They may grow large and sometimes spread to nearby tissue. The most common type of benign vascular tumor is hemangioma, which usually occurs in infants and goes away on its own.
  benzaldehyde: (ben-ZAL-deh-hide)
    Pronunciation of dictionary term "benzaldehyde"
    A chemical used in flavorings and in some dyes, perfumes, and medicines. It is found in essential oils made from almonds and peach pits and in other foods. It can also be made in the laboratory.
  benzene: (BEN-zeen)
    Pronunciation of dictionary term "benzene"
    A chemical that is used widely by the chemical industry, and is also found in tobacco smoke, vehicle emissions, and gasoline fumes. Exposure to benzene may increase the risk of developing leukemia.
    More Information
    - Benzene (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/benzene)
  benzo(a)pyrene: (BEN-zoh-ay-PY-reen)
    Pronunciation of dictionary term "benzo(a)pyrene"
    A chemical that comes from certain substances when they are not burned completely. It is found in car exhaust, smoke from wood fires, tobacco, oil and gas products, charred or grilled foods, and other sources. It may also be found in water and soil. Benzo(a)pyrene can cause a skin rash, a burning feeling, skin color changes, warts, and bronchitis. It may also cause cancer. It is a type of polycyclic aromatic hydrocarbon. Also called 3,4-benzpyrene.
  benzodiazepine: (BEN-zoh-dy-A-zeh-peen)
    Pronunciation of dictionary term "benzodiazepine"
    A type of drug used to relieve anxiety and insomnia (trouble sleeping). Benzodiazepines are also used to relax muscles and prevent seizures. They increase the effect of a chemical in the brain called GABA, which is a neurotransmitter (a substance that nerves use to send messages to one another). This causes brain activity to slow down. Benzodiazepines are a type of CNS depressant.
  benzoylphenylurea: (BEN-zoyl-FEH-nil-yoo-REE-uh)
    Pronunciation of dictionary term "benzoylphenylurea"
    A substance being studied in the treatment of cancer. It is a type of antitubulin agent. Also called BPU.
  benzydamine: (ben-ZIH-duh-meen)
    Pronunciation of dictionary term "benzydamine"
    A substance being studied as a mouth rinse treatment for oral mucositis (painful mouth sores) caused by cancer therapy. It is a type of nonsteroidal anti-inflammatory drug (NSAID).
  BEP: An abbreviation for a chemotherapy combination used to treat ovarian and testicular germ cell tumors. It includes the drugs bleomycin sulfate, etoposide phosphate, and cisplatin (Platinol). Also called BEP regimen.
    More Information
    - BEP (https://www.cancer.gov/about-cancer/treatment/drugs/BEP)
  BEP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "BEP regimen"
    An abbreviation for a chemotherapy combination used to treat ovarian and testicular germ cell tumors. It includes the drugs bleomycin sulfate, etoposide phosphate, and cisplatin (Platinol). Also called BEP.
    More Information
    - BEP (https://www.cancer.gov/about-cancer/treatment/drugs/BEP)
  bereavement: (beh-REEV-ment)
    Pronunciation of dictionary term "bereavement"
    A state of sadness, grief, and mourning after the loss of a loved one.
    More Information
    - Grief, Bereavement, and Loss
  bergamot: (BER-guh-mot)
    Pronunciation of dictionary term "bergamot"
    A type of orange tree grown in Italy. The essential oil from the peel of this orange is used in perfume, to get rid of insects, and to flavor tea. Bergamot oil is also used in aromatherapy for depression, anxiety, and poor digestion. The scientific name for the bergamot orange tree is Citrus bergamia.
  Besponsa: (beh-SPON-suh)
    Pronunciation of dictionary term "Besponsa"
    A drug used to treat adults and children aged 1 year and older with B-cell acute lymphoblastic leukemia that is CD22 positive (expresses the protein CD22). It is used in patients whose cancer came back or did not get better with other treatment. It is also being studied in the treatment of other types of cancer. Besponsa contains a monoclonal antibody that binds to CD22, which is found on some leukemia cells. It also contains an anticancer drug, which may help kill cancer cells. Besponsa is a type of antibody-drug conjugate. Also called inotuzumab ozogamicin.
    More Information
    - Inotuzumab Ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/inotuzumabozogamicin)
  Besremi: (bez-REH-mee)
    Pronunciation of dictionary term "Besremi"
    A drug used to treat adults with polycythemia vera (a disease in which too many red blood cells are made in the bone marrow). It is also being studied in the treatment of other conditions and some types of cancer. Besremi is a form of recombinant interferon alfa-2b that is made in the laboratory and linked to a substance called PEG, which makes the drug stay in the body longer. Besremi may lower the number of red blood cells made in the bone marrow. It is a type of cytokine and a type of immunomodulating agent. Also called ropeginterferon alfa-2b.
    More Information
    - Ropeginterferon Alfa-2b-njft (https://www.cancer.gov/about-cancer/treatment/drugs/ropeginterferon-alfa-2b-njft)
  best practice: (... PRAK-tis)
    Pronunciation of dictionary term "best practice"
    Treatment that is accepted by medical experts as a proper treatment for a certain type of disease and that is widely used by health care professionals. Also called standard medical care, standard of care, and standard therapy.
  beta alethine: (BAY-tuh a-LEH-theen)
    Pronunciation of dictionary term "beta alethine"
    A substance that is being studied in the treatment of cancer. It belongs to a family of chemicals called disulfides.
  beta carotene: (BAY-tuh KAYR-uh-teen)
    Pronunciation of dictionary term "beta carotene"
    A substance found in yellow and orange fruits and vegetables and in dark green, leafy vegetables. The body can make vitamin A from beta carotene. Beta carotene is being studied in the prevention of some types of cancer. It is a type of antioxidant.
  beta cell neoplasm: (BAY-tuh sel NEE-oh-PLA-zum)
    Pronunciation of dictionary term "beta cell neoplasm"
    An abnormal mass that grows in the beta cells of the pancreas that make insulin. Beta cell neoplasms are usually benign (not cancer). They secrete insulin and are the most common cause of low blood sugar caused by having too much insulin in the body. Also called beta cell tumor of the pancreas, insulinoma, and pancreatic insulin-producing tumor.
  beta cell tumor of the pancreas: (BAY-tuh sel TOO-mer … PAN-kree-us)
    Pronunciation of dictionary term "beta cell tumor of the pancreas"
    An abnormal mass that grows in the beta cells of the pancreas that make insulin. Beta cell tumors of the pancreas are usually benign (not cancer). They secrete insulin and are the most common cause of low blood sugar caused by having too much insulin in the body. Also called beta cell neoplasm, insulinoma, and pancreatic insulin-producing tumor.
  beta hemolytic streptococcus group B: (BAY-tuh HEE-moh-LIH-tik STREP-toh-KAH-kus ...)
    Pronunciation of dictionary term "beta hemolytic streptococcus group B"
    A type of bacterium often found in the vagina. It can cause systemic infections in people with suppressed immune systems.
  beta-2-microglobulin: (BAY-tuh-2-MY-kroh-GLAH-byoo-lin)
    Pronunciation of dictionary term "beta-2-microglobulin"
    A small protein normally found on the surface of many cells, including lymphocytes, and in small amounts in the blood and urine. An increased amount in the blood or urine may be a sign of certain diseases, including some types of cancer, such as multiple myeloma or lymphoma.
  beta-adrenergic antagonist: (BAY-tuh-A-dreh-NER-jik an-TA-guh-nist)
    Pronunciation of dictionary term "beta-adrenergic antagonist"
    A type of drug that blocks the action of substances, such as adrenaline, on nerve cells and causes blood vessels to relax and dilate (widen). This allows blood to flow more easily and lowers blood pressure and the heart rate. Beta-adrenergic antagonists are used to treat high blood pressure, chest pain (angina), abnormal heart rate (arrhythmia), congestive heart failure, and several other conditions. They may also shrink certain types of vascular tumors, such as hemangiomas. Also called beta-adrenergic blocking agent and beta-blocker.
  beta-adrenergic blocking agent: (BAY-tuh-A-dreh-NER-jik BLAH-king AY-jent)
    Pronunciation of dictionary term "beta-adrenergic blocking agent"
    A type of drug that blocks the action of substances, such as adrenaline, on nerve cells and causes blood vessels to relax and dilate (widen). This allows blood to flow more easily and lowers blood pressure and the heart rate. Beta-adrenergic blocking agents are used to treat high blood pressure, chest pain (angina), abnormal heart rate (arrhythmia), congestive heart failure, and several other conditions. They may also shrink certain types of vascular tumors, such as hemangiomas. Also called beta-adrenergic antagonist and beta-blocker.
  beta-blocker: (BAY-tuh-BLAH-ker)
    Pronunciation of dictionary term "beta-blocker"
    A type of drug that blocks the action of substances, such as adrenaline, on nerve cells and causes blood vessels to relax and dilate (widen). This allows blood to flow more easily and lowers blood pressure and the heart rate. Beta-blockers are used to treat high blood pressure, chest pain (angina), abnormal heart rate (arrhythmia), congestive heart failure, and several other conditions. They may also shrink certain types of vascular tumors, such as hemangiomas. Also called beta-adrenergic antagonist and beta-adrenergic blocking agent.
  beta-endorphin: (BAY-tuh en-DOR-fin)
    Pronunciation of dictionary term "beta-endorphin"
    A substance produced in the brain, especially in the pituitary gland, that blocks the sensation of pain. It is produced in response to pain, exercise, and other forms of stress. It is a type of polypeptide hormone.
  beta-glucan: (BAY-tuh-GLOO-kan)
    Pronunciation of dictionary term "beta-glucan"
    A substance found in bacteria, plants, and certain foods, such as baker’s yeast, cereal grains, and mushrooms. It is a type of polysaccharide that is made of a string of glucose (sugar) molecules joined together. Beta-glucan may stimulate the immune system and help kill cancer cells. It is being studied in the treatment of cancer. It is a type of biological response modifier.
  beta-hCG: (BAY-tuh...)
    Pronunciation of dictionary term "beta-hCG"
    A hormone found in the blood and urine during pregnancy. It may also be found in higher than normal amounts in patients with some types of cancer, including testicular, ovarian, liver, stomach, and lung cancers, and in other disorders. Measuring the amount of beta-hCG in the blood or urine of cancer patients may help to diagnose cancer and find out how well cancer treatment is working. Beta-hCG is a type of tumor marker. Also called beta-human chorionic gonadotropin.
  beta-human chorionic gonadotropin: (BAY-tuh-HYOO-mun KOR-ee-AH-nik goh-NA-doh-TROH-pin)
    Pronunciation of dictionary term "beta-human chorionic gonadotropin"
    A hormone found in the blood and urine during pregnancy. It may also be found in higher than normal amounts in patients with some types of cancer, including testicular, ovarian, liver, stomach, and lung cancers, and in other disorders. Measuring the amount of beta-human chorionic gonadotropin in the blood or urine of cancer patients may help to diagnose cancer and find out how well cancer treatment is working. Beta-human chorionic gonadotropin is a type of tumor marker. Also called beta-hCG.
  beta-sitosterol: (BAY-tuh-sy-TOS-teh-rol)
    Pronunciation of dictionary term "beta-sitosterol"
    A substance found in various nuts, beans, seeds, fruits, and vegetables. It may also be used in dietary supplements. Beta-sitosterol may help lower cholesterol levels in the blood by decreasing the amount of cholesterol absorbed from the diet. It may also slow the growth of some types of cancer cells and kill them. It is a type of phytosterol.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  betel quid with tobacco: (BEE-til kwid … tuh-BA-koh)
    Pronunciation of dictionary term "betel quid with tobacco"
    A type of smokeless tobacco that is made in India and is widely used throughout Asia. It is a mixture of tobacco, crushed areca nut (also called betel nut), spices, and other ingredients. It is used like chewing tobacco and is placed in the mouth, usually between the gum and cheek. Betel quid with tobacco contains nicotine and many harmful, cancer-causing chemicals. Using it can lead to nicotine addiction and can cause cancers of the lip, mouth, tongue, throat, and esophagus. Also called gutka.
    More Information
    - Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention (Health Professional Version) (https://www.cancer.gov/types/head-and-neck/hp/oral-prevention-pdq)
  bevacizumab: (beh-vuh-SIH-zoo-mab)
    Pronunciation of dictionary term "bevacizumab"
    A drug that binds to the protein VEGF to help keep new blood vessels from forming and is used to treat many different types of cancer. Bevacizumab is used under the brand names Alymsys, Mvasi, Avastin, and Zirabev, alone or with other drugs, to treat certain types of cervical cancer, colorectal cancer, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), and glioblastoma (a type of brain cancer). The Alymsys and Avastin brands of bevacizumab are also used to treat certain types of ovarian epithelial, fallopian tube, and primary peritoneal cancer. The Avastin brand is also used to treat certain types of hepatocellular carcinoma (a type of liver cancer). Bevacizumab is also being studied in the treatment of other types of cancer. It may prevent the growth of new blood vessels that tumors need to grow. Bevacizumab is a type of antiangiogenesis agent and a type of monoclonal antibody.
    More Information
    - Bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
  bexarotene: (bek-SAYR-uh-teen)
    Pronunciation of dictionary term "bexarotene"
    A drug used to treat skin problems caused by cutaneous T-cell lymphoma that did not get better after other treatment. It is also being studied in the treatment of other types of cancer. Bexarotene binds to and activates proteins called retinoid X receptors, which may stop the growth of cancer cells and kill them. It is a type of retinoid. Also called LGD1069 and Targretin.
    More Information
    - Bexarotene (https://www.cancer.gov/about-cancer/treatment/drugs/bexarotene)
  Bexxar: (BEK-sar)
    Pronunciation of dictionary term "Bexxar"
    A combination of drugs used to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Bexxar is made up of a monoclonal antibody called tositumomab and a form of tositumomab that is linked to a radioactive substance called iodine I 131. It is a type of radioimmunoconjugate. Also called Bexxar regimen and tositumomab and iodine I 131-tositumomab.
  Bexxar regimen: (BEK-sar REH-jih-men)
    Pronunciation of dictionary term "Bexxar regimen"
    A combination of drugs used to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Bexxar regimen is made up of a monoclonal antibody called tositumomab and a form of tositumomab that is linked to a radioactive substance called iodine I 131. It is a type of radioimmunoconjugate. Also called Bexxar and tositumomab and iodine I 131-tositumomab.
  BG00001: A gene therapy agent that is being studied in the treatment of cancer. It belongs to the family of drugs called biological response modifiers.
  BI 2536: A substance being studied in the treatment of cancer. It prevents cells from dividing and may block the growth of some tumors. It is a type of mitotic inhibitor.
  BI-RADS: A reporting system used to describe the results of a mammogram, breast ultrasound, or breast MRI in a standard way. BI-RADS ranks the test findings according to one of seven categories, ranging from normal or benign (not cancer) to highly suspicious or malignant (cancer). Each category includes follow-up recommendations to help manage a person’s care. For mammograms, BI-RADS includes four additional categories that describe the level of breast density seen, ranging from little or no dense tissue to very dense tissue. Also called Breast Imaging Reporting and Data System.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  Biafine cream: (BY-uh-feen …)
    Pronunciation of dictionary term "Biafine cream"
    A substance that is put on the skin to help repair damaged skin. It may be used on certain wounds and burns, and to treat the redness, burning, and peeling caused by radiation therapy.
  bias: (BY-us)
    Pronunciation of dictionary term "bias"
    In a scientific research study or clinical trial, a flaw in the study design or the method of collecting or interpreting information. Biases can lead to incorrect conclusions about what the study or clinical trial showed.
  BIBF 1120: A substance being studied in the treatment of some types of cancer. BIBF 1120 blocks enzymes needed for cells to grow, and may prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called tyrosine kinase inhibitor BIBF 1120.
  BIBX 1382: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called epidermal growth factor receptor (EGFR) inhibitors.
  bicalutamide: (BY-kuh-LOO-tuh-mide)
    Pronunciation of dictionary term "bicalutamide"
    A drug used with another drug to treat prostate cancer that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Bicalutamide binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Bicalutamide blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called Casodex.
    More Information
    - Bicalutamide (https://www.cancer.gov/about-cancer/treatment/drugs/bicalutamide)
  BiCNU: A drug used alone or with other drugs to treat certain types of brain tumors, Hodgkin lymphoma, and non-Hodgkin lymphoma and with prednisone to treat multiple myeloma. It is also being studied in the treatment of other types of cancer. BiCNU damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea. Also called BCNU and carmustine.
    More Information
    - Carmustine (https://www.cancer.gov/about-cancer/treatment/drugs/carmustine)
  bidi: (BEE-dee)
    Pronunciation of dictionary term "bidi"
    A cigarette made by rolling tobacco by hand in a dried leaf from the tendu tree (a member of the ebony family). Most bidis are made in India, and they come in different flavors.
  bilateral: (by-LA-teh-rul)
    Pronunciation of dictionary term "bilateral"
    Affecting both the right and left sides of the body.
  bilateral cancer: (by-LA-teh-rul KAN-ser)
    Pronunciation of dictionary term "bilateral cancer"
    Cancer that occurs in both of a pair of organs, such as both breasts, ovaries, eyes, lungs, kidneys, or adrenal glands, at the same time.
  bilateral nephrectomy: (by-LA-teh-rul neh-FREK-toh-mee)
    Pronunciation of dictionary term "bilateral nephrectomy"
    Surgery to remove both kidneys.
  bilateral prophylactic mastectomy: (by-LA-teh-rul PROH-fih-LAK-tik ma-STEK-toh-mee)
    Pronunciation of dictionary term "bilateral prophylactic mastectomy"
    Surgery to remove both breasts in order to reduce the risk of developing breast cancer.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  bilateral salpingo-oophorectomy: (by-LA-teh-rul sal-PIN-goh-oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "bilateral salpingo-oophorectomy"
    Surgery to remove both ovaries and both fallopian tubes.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  bile: (bile)
    Pronunciation of dictionary term "bile"
    A fluid made by the liver and stored in the gallbladder. Bile is excreted into the small intestine, where it helps digest fat.
  bile duct: (bile dukt)
    Pronunciation of dictionary term "bile duct"
    A tube through which bile passes in and out of the liver.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
    Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
  bile duct cancer: (bile dukt KAN-ser)
    Pronunciation of dictionary term "bile duct cancer"
    A rare cancer that forms in the bile ducts. A bile duct is a tube that carries bile (fluid made by the liver) between the liver and gallbladder and the small intestine. Intrahepatic bile duct cancer is found inside the liver. Extrahepatic bile duct cancer is found outside the liver. Also called cholangiocarcinoma.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
    Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
  biliary: (BIH-lee-AYR-ee)
    Pronunciation of dictionary term "biliary"
    Having to do with the liver, bile ducts, and/or gallbladder.
  biliary bypass: (BIH-lee-AYR-ee BY-pas)
    Pronunciation of dictionary term "biliary bypass"
    Surgery done to help relieve symptoms caused by a blocked bile duct. During a biliary bypass, the gallbladder or a part of the bile duct before the blockage is connected to either a part of the bile duct that is past the blockage or to the small intestine. This allows bile (fluid made by the liver) to flow around the blockage to the gallbladder or small intestine. A blocked bile duct may be caused by cancer or other conditions, such as gallstones, infection, or scar tissue. A biliary bypass is usually done in patients who have bile duct tumors that cannot be completely removed by surgery.
    Anatomy of the gallbladder. The gallbladder is just below the liver. Bile is stored in the gallbladder and flows through the cystic duct and the common bile duct into the small intestine when food is being digested.
    Anatomy of the gallbladder; shows the liver, common hepatic duct, cystic duct, common bile duct, pancreas, and small intestine. The inset shows the liver, bile ducts, gallbladder, pancreas, and small intestine.
  biliary cirrhosis: (BIH-lee-AYR-ee seh-ROH-sis)
    Pronunciation of dictionary term "biliary cirrhosis"
    A type of chronic liver disease in which the tubes that carry bile (fluid that helps digest fat) out of the liver become damaged or blocked over time. This can cause bile and toxic substances to build up in the liver, which may lead to cirrhosis (scarring of the liver) and liver failure. It may also increase the risk of liver cancer. Biliary cirrhosis may be caused by gallstones, injury to the bile ducts, autoimmune disorders, and certain other conditions.
  biliary system: (BIH-lee-AYR-ee SIS-tem)
    Pronunciation of dictionary term "biliary system"
    The organs and ducts that make and store bile (a fluid made by the liver that helps digest fat), and release it into the small intestine. The biliary system includes the gallbladder and bile ducts inside and outside the liver. Also called biliary tract.
  biliary tract: (BIH-lee-AYR-ee …)
    Pronunciation of dictionary term "biliary tract"
    The organs and ducts that make and store bile (a fluid made by the liver that helps digest fat), and release it into the small intestine. The biliary tract includes the gallbladder and bile ducts inside and outside the liver. Also called biliary system.
  biliary tract cancer: (BIH-lee-AYR-ee … KAN-ser)
    Pronunciation of dictionary term "biliary tract cancer"
    A rare cancer that forms in the cells that line the bile ducts, gallbladder, or ampulla of Vater (the area where the bile ducts from the liver and pancreas join and enter the first part of the small intestine). Biliary tract cancers tend to grow and spread quickly. They are usually diagnosed at an advanced stage and have a poor prognosis (outcome).
  bilirubin: (BIH-lih-ROO-bin)
    Pronunciation of dictionary term "bilirubin"
    Substance formed when red blood cells are broken down. Bilirubin is part of the bile, which is made in the liver and is stored in the gallbladder. The abnormal buildup of bilirubin causes jaundice.
  bimatoprost: (bih-MA-toh-prost)
    Pronunciation of dictionary term "bimatoprost"
    A drug used under the name Latisse to increase the length, thickness, and darkness of eyelashes. It is being studied as a way to increase the growth of eyelashes and eyebrows in patients given chemotherapy for cancer. Bimatoprost is also used under the name Lumigan to treat glaucoma (a build-up of fluid in the eye). It lowers pressure in the eye by increasing the flow of natural eye fluids out of the eye. It is a type of prostaglandin analog.
  binding agent: (BINE-ding AY-jent)
    Pronunciation of dictionary term "binding agent"
    A substance that makes a loose mixture stick together. For example, binding agents can be used to make solid pills from loose powders.
  binimetinib: (BIH-nee-MEH-tih-nib)
    Pronunciation of dictionary term "binimetinib"
    A drug used with encorafenib to treat melanoma that has spread or cannot be removed by surgery and has a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Binimetinib blocks proteins called MEK1 and MEK2, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called Mektovi.
    More Information
    - Binimetinib (https://www.cancer.gov/about-cancer/treatment/drugs/binimetinib)
  bioactive compound: (BY-oh-AK-tiv KOM-pownd)
    Pronunciation of dictionary term "bioactive compound"
    A type of chemical found in small amounts in plants and certain foods (such as fruits, vegetables, nuts, oils, and whole grains). Bioactive compounds have actions in the body that may promote good health. They are being studied in the prevention of cancer, heart disease, and other diseases. Examples of bioactive compounds include lycopene, resveratrol, lignan, tannins, and indoles.
  bioavailable: (BY-oh-uh-VAY-luh-bul)
    Pronunciation of dictionary term "bioavailable"
    The ability of a drug or other substance to be absorbed and used by the body. Orally bioavailable means that a drug or other substance that is taken by mouth can be absorbed and used by the body.
  biochanin A: (BY-oh-KAH-nin ...)
    Pronunciation of dictionary term "biochanin A"
    An isoflavone found in soy products. Soy isoflavones (estrogen-like substances made by some plants) are being studied to see if they help prevent cancer.
  biochemical reactions: (BY-oh-KEH-mih-kul ree-AK-shuns)
    Pronunciation of dictionary term "biochemical reactions"
    In living cells, chemical reactions that help sustain life and allow cells to grow.
  biochemical recurrence: (BY-oh-KEH-mih-kul ree-KER-ents)
    Pronunciation of dictionary term "biochemical recurrence"
    A rise in the blood level of PSA (prostate-specific antigen) in prostate cancer patients after treatment with surgery or radiation. Biochemical recurrence may occur in patients who do not have symptoms. It may mean that the cancer has come back. Also called biochemical relapse and PSA failure.
  biochemical relapse: (BY-oh-KEH-mih-kul REE-laps)
    Pronunciation of dictionary term "biochemical relapse"
    A rise in the blood level of PSA (prostate-specific antigen) in prostate cancer patients after treatment with surgery or radiation. Biochemical relapse may occur in patients who do not have symptoms. It may mean that the cancer has come back. Also called biochemical recurrence and PSA failure.
  biochemist: (BY-oh-KEH-mist)
    Pronunciation of dictionary term "biochemist"
    A scientist who has special training in the study of the chemicals and processes that occur in all living things.
  biofeedback: (BY-oh-FEED-bak)
    Pronunciation of dictionary term "biofeedback"
    A method of learning to voluntarily control certain body functions such as heartbeat, blood pressure, and muscle tension with the help of a special machine. This method can help control pain.
  biofilm: (BY-oh-FILM)
    Pronunciation of dictionary term "biofilm"
    A layer of bacteria or other microbes that grows on and sticks to the surface of a structure. A biofilm may cover natural surfaces, such as teeth. They may also grow in or on medical devices, such as catheters or artificial joints. Bacteria growing as a biofilm are hard to treat with antibiotics.
  bioinformatics: (BY-oh-in-for-MA-tix)
    Pronunciation of dictionary term "bioinformatics"
    A field of science that uses computers, databases, math, and statistics to collect, store, organize, and analyze large amounts of biological, medical, and health information. Information may come from many sources, including genetic and molecular research studies, patient statistics, tissue specimens, clinical trials, and scientific journals. Also called computational biology.
  biologic agent: (BY-oh-LAH-jik AY-jent)
    Pronunciation of dictionary term "biologic agent"
    A substance that is made from a living organism or its products and is used in the prevention, diagnosis, or treatment of cancer and other diseases. Biologic agents include antibodies, interleukins, and vaccines. Also called biological agent and biological drug.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  biological: (BY-oh-LAH-jih-kul)
    Pronunciation of dictionary term "biological"
    Pertaining to biology or to life and living things. In medicine, refers to a substance made from a living organism or its products. Biologicals may be used to prevent, diagnose, treat or relieve of symptoms of a disease. For example, antibodies, interleukins, and vaccines are biologicals. Biological also refers to parents and children who are related by blood.
  biological agent: (BY-oh-LAH-jih-kul AY-jent)
    Pronunciation of dictionary term "biological agent"
    A substance that is made from a living organism or its products and is used in the prevention, diagnosis, or treatment of cancer and other diseases. Biological agents include antibodies, interleukins, and vaccines. Also called biologic agent and biological drug.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  biological drug: (BY-oh-LAH-jih-kul...)
    Pronunciation of dictionary term "biological drug"
    A substance that is made from a living organism or its products and is used in the prevention, diagnosis, or treatment of cancer and other diseases. Biological drugs include antibodies, interleukins, and vaccines. Also called biologic agent and biological agent.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  biological endpoint: (BY-oh-LAH-jih-kul END-poynt)
    Pronunciation of dictionary term "biological endpoint"
    In clinical trials, a physiological feature thought to be affected by the treatment.
  biological profile: (BY-oh-LAH-jih-kul PROH-file)
    Pronunciation of dictionary term "biological profile"
    A summary of the biological actions of a substance. A biological profile may come from patient data or from tests done in the laboratory or in animals.
  biological response modifier therapy: (BY-oh-LAH-jih-kul reh-SPONTS MAH-dih-FY-er THAYR-uh-pee)
    Pronunciation of dictionary term "biological response modifier therapy"
    A type of treatment that uses substances made from living organisms to treat disease. These substances may occur naturally in the body or may be made in the laboratory. In cancer, some biological response modifier therapies stimulate or suppress the immune system to help the body fight cancer. Other biological response modifier therapies attack specific cancer cells, which may help keep them from growing or kill them. They may also lessen certain side effects caused by some cancer treatments. Types of biological response modifier therapy include immunotherapy (such as cytokines, cancer treatment vaccines, and some antibodies) and some targeted therapies. Also called biological therapy, biotherapy, and BRM therapy.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  biological therapy: (BY-oh-LAH-jih-kul THAYR-uh-pee)
    Pronunciation of dictionary term "biological therapy"
    A type of treatment that uses substances made from living organisms to treat disease. These substances may occur naturally in the body or may be made in the laboratory. In cancer, some biological therapies stimulate or suppress the immune system to help the body fight cancer. Other biological therapies attack specific cancer cells, which may help keep them from growing or kill them. They may also lessen certain side effects caused by some cancer treatments. Types of biological therapy include immunotherapy (such as cytokines, cancer treatment vaccines, and some antibodies) and some targeted therapies. Also called biological response modifier therapy, biotherapy, and BRM therapy.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  biomarker: (BY-oh-MAR-ker)
    Pronunciation of dictionary term "biomarker"
    A biological molecule found in blood, other body fluids, or tissues that is a sign of a normal or abnormal process, or of a condition or disease. A biomarker may be used to see how well the body responds to a treatment for a disease or condition. Also called molecular marker and signature molecule.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  biomarker testing: (BY-oh-MAR-ker TES-ting)
    Pronunciation of dictionary term "biomarker testing"
    A laboratory method that uses a sample of tissue, blood, or other body fluid to check for certain genes, proteins, or other molecules that may be a sign of a disease or condition, such as cancer. Biomarker testing can also be used to check for certain changes in a gene or chromosome that may increase a person’s risk of developing cancer or other diseases. Biomarker testing may be done with other procedures, such as biopsies, to help diagnose some types of cancer. It may also be used to help plan treatment, find out how well treatment is working, make a prognosis, or predict whether cancer will come back or spread to other parts of the body. Also called molecular profiling and molecular testing.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  Biomed 101: (BY-oh-MED …)
    Pronunciation of dictionary term "Biomed 101"
    A substance that is being studied for its ability to decrease the side effects of interleukin-2 (IL-2).
  biomedicine: (BY-oh-MEH-dih-sin)
    Pronunciation of dictionary term "biomedicine"
    A system in which medical doctors and other health care professionals (such as nurses, pharmacists, and therapists) treat symptoms and diseases using drugs, radiation, or surgery. Also called allopathic medicine, conventional medicine, mainstream medicine, orthodox medicine, and Western medicine.
  biometrics: (BY-oh-MEH-trix)
    Pronunciation of dictionary term "biometrics"
    The science of collecting and analyzing biologic or health data using statistical methods. Biometrics may be used to help learn the possible causes of a cancer or how often a cancer occurs in a certain group of people. Also called biometry and biostatistics.
    More Information
    - Cancer Statistics (https://www.cancer.gov/about-cancer/understanding/statistics)
  biometry: (by-AH-meh-tree)
    Pronunciation of dictionary term "biometry"
    The science of collecting and analyzing biologic or health data using statistical methods. Biometry may be used to help learn the possible causes of a cancer or how often a cancer occurs in a certain group of people. Also called biometrics and biostatistics.
    More Information
    - Cancer Statistics (https://www.cancer.gov/about-cancer/understanding/statistics)
  biopsy: (BY-op-see)
    Pronunciation of dictionary term "biopsy"
    The removal of cells or tissues for examination by a pathologist. The pathologist may study the tissue under a microscope or perform other tests on the cells or tissue. There are many different types of biopsy procedures. The most common types include: (1) incisional biopsy, in which only a sample of tissue is removed; (2) excisional biopsy, in which an entire lump or suspicious area is removed; and (3) needle biopsy, in which a sample of tissue or fluid is removed with a needle. When a wide needle is used, the procedure is called a core biopsy. When a thin needle is used, the procedure is called a fine-needle aspiration biopsy.
  biopsy specimen: (BY-op-see SPEH-sih-men)
    Pronunciation of dictionary term "biopsy specimen"
    Tissue removed from the body and examined under a microscope to determine whether disease is present.
  biorepository: (BY-oh-reh-PAH-zih-TOR-ee)
    Pronunciation of dictionary term "biorepository"
    A facility that collects, catalogs, and stores samples of biological material, such as urine, blood, tissue, cells, DNA, RNA, and protein, from humans, animals, or plants for laboratory research. If the samples are from people, medical information may also be stored along with a written consent to use the samples in laboratory studies.
  biosimilar drug: (BY-oh-SIH-mih-ler …)
    Pronunciation of dictionary term "biosimilar drug"
    A biological drug that is very much like another biological drug (called the reference drug) that has already been approved by the U.S. Food and Drug Administration (FDA). Biosimilar drugs and reference drugs are made from living organisms but they may be made in different ways and of slightly different substances. To be called a biosimilar drug, a biological drug must be shown to be as safe as, work as well as, and work in the same way as its reference drug. It must also be used in the same way, at the same dose, and for the same condition as the reference drug. Biosimilar drugs must be approved by FDA, and may cost less than the reference drugs.
  biospecimen: (BY-oh-SPEH-sih-men)
    Pronunciation of dictionary term "biospecimen"
    A sample of material, such as urine, blood, tissue, cells, DNA, RNA, or protein, from humans, animals, or plants. Biospecimens may be used for a laboratory test or stored in a biorepository to be used for research.
  biostatistics: (BY-oh-stuh-TIS-tix)
    Pronunciation of dictionary term "biostatistics"
    The science of collecting and analyzing biologic or health data using statistical methods. Biostatistics may be used to help learn the possible causes of a cancer or how often a cancer occurs in a certain group of people. Also called biometrics and biometry.
    More Information
    - Cancer Statistics (https://www.cancer.gov/about-cancer/understanding/statistics)
  biotherapy: (BY-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "biotherapy"
    A type of treatment that uses substances made from living organisms to treat disease. These substances may occur naturally in the body or may be made in the laboratory. In cancer, some biotherapies stimulate or suppress the immune system to help the body fight cancer. Other biotherapies attack specific cancer cells, which may help keep them from growing or kill them. They may also lessen certain side effects caused by some cancer treatments. Types of biotherapy include immunotherapy (such as cytokines, cancer treatment vaccines, and some antibodies) and some targeted therapies. Also called biological response modifier therapy, biological therapy, and BRM therapy.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  biotin: (BY-oh-tin)
    Pronunciation of dictionary term "biotin"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Biotin helps some enzymes break down substances in the body for energy and helps tissues develop. It is found in yeast, whole milk, egg yolks, and organ meats. Biotin is water-soluble (can dissolve in water) and must be taken in every day. Not enough biotin can cause skin, nerve, and eye disorders. Biotin is present in larger amounts in some cancer tissue than in normal tissue. Attaching biotin to substances used to treat some types of cancer helps them find cancer cells. Also called vitamin H.
  Birt-Hogg-Dubé syndrome: (birt-hog-doo-BAY SIN-drome)
    Pronunciation of dictionary term "Birt-Hogg-Dubé syndrome"
    A rare, inherited disorder in which benign (not cancer) skin lesions called fibrofolliculomas form in the hair follicles on the face, neck, and chest. Patients with Birt-Hogg-Dubé syndrome have an increased risk of kidney cancer and benign kidney tumors. They may also have lung cysts and a condition called a pneumothorax, in which all or part of the lung collapses. The signs and symptoms of Birt-Hogg-Dubé syndrome usually do not appear until young adulthood. It is caused by a mutation (change) in a gene called FLCN.
    More Information
    - Birt-Hogg-Dube syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2322/birt-hogg-dube-syndrome)
    - Birt-Hogg-Dubé syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/birt-hogg-dube-syndrome/)
    Areas of the body affected by Birt-Hogg-Dube (BHD) syndrome. BHD syndrome is an inherited disorder that causes an increased risk of kidney cancer, benign (not cancer) skin lesions, collapsed lungs, and lung cysts.
    Drawing showing areas of the body affected by Birt-Hogg-Dube syndrome, including the skin, lungs, and kidneys.
  birth canal: (berth kuh-NAL)
    Pronunciation of dictionary term "birth canal"
    The muscular canal that goes from the uterus to the outside of the body. During birth, the baby passes through the birth canal. Also called vagina.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  birth control: (berth kun-TROLE)
    Pronunciation of dictionary term "birth control"
    The use of drugs, devices, or surgery to prevent pregnancy. There are many different types of birth control. These include barrier methods to keep sperm from fertilizing the egg, hormone methods, intrauterine devices (IUDs), and surgery to close the fallopian tubes in women or close off the two tubes that carry sperm out of the testicles in men. Also called contraception.
  birth control pill: (berth kun-TROLE pil)
    Pronunciation of dictionary term "birth control pill"
    A pill used to prevent pregnancy. It contains hormones that block the release of eggs from the ovaries. Most birth control pills include estrogen and progestin. Also called oral contraceptive pill.
    More Information
    - Oral Contraceptives and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/oral-contraceptives-fact-sheet)
  bismuth: (BIZ-mooth)
    Pronunciation of dictionary term "bismuth"
    A silver-white metal used in medicines and other products. Certain forms of bismuth are used to treat diarrhea, heartburn, and upset stomach. Bismuth is also used with certain other drugs to treat stomach ulcers.
  bispecific antibody: (BY-speh-SIH-fik AN-tee-BAH-dee)
    Pronunciation of dictionary term "bispecific antibody"
    A type of antibody that can bind to two different antigens at the same time. Bispecific antibodies are being studied in the imaging and treatment of cancer. They are made in the laboratory.
  bispecific fusion protein: (BY-speh-SIH-fik FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "bispecific fusion protein"
    A protein made in the laboratory that can bind to two different molecules on two different cells at the same time. For example, a bispecific fusion protein may bind to a certain molecule on cancer cells and, at the same time, bind to a different molecule on T cells (a type of immune cell). This helps the body's T cells get close enough to the cancer cells to kill them. Bispecific fusion proteins may be used as a type of immunotherapy to treat some types of cancer.
  bispecific monoclonal antibody: (BY-speh-SIH-fik MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "bispecific monoclonal antibody"
    An antibody that can bind to two different antigens at the same time. Bispecific monoclonal antibodies are being studied in the imaging and treatment of cancer. They are made in the laboratory.
  bispecific T-cell engager: (BY-speh-SIH-fik … en-GAY-jer)
    Pronunciation of dictionary term "bispecific T-cell engager"
    A substance made in the laboratory that can bind to two target proteins on the surface of different cells. For example, a bispecific T-cell engager may bind to a certain protein on healthy T cells (a type of immune cell) and, at the same time, to a different protein on cancer cells. This brings the T cells and cancer cells close together so the T cells can more effectively kill the cancer cells. Some bispecific T-cell engagers are being used to treat certain types of cancer, including acute lymphoblastic leukemia, multiple myeloma, lymphoma, and small cell lung cancer. They are a type of targeted therapy. Also called BiTE.
  bisphosphonate: (bis-FOS-foh-nayt)
    Pronunciation of dictionary term "bisphosphonate"
    A drug or substance used to treat hypercalcemia (abnormally high blood calcium) and bone pain caused by some types of cancer. Forms of bisphosphonates are also used to treat osteoporosis and for bone imaging. Bisphosphonates inhibit a type of bone cell that breaks down bone. Also called diphosphonate.
  bisphosphonate-associated osteonecrosis: (bis-FOS-foh-nayt-uh-SOH-see-ay-ted OS-tee-oh-neh-KROH-sis)
    Pronunciation of dictionary term "bisphosphonate-associated osteonecrosis"
    The necrosis (death) of bone tissue caused by treatment with a bisphosphonate (a drug or substance used to treat osteoporosis, bone pain caused by some types of cancer, and high blood calcium). It commonly occurs in the jaw bones. There may be pain, swelling and infection in the areas of necrosis. Also called BON.
  BiTE: A substance made in the laboratory that can bind to two target proteins on the surface of different cells. For example, a BiTE may bind to a certain protein on healthy T cells (a type of immune cell) and, at the same time, to a different protein on cancer cells. This brings the T cells and cancer cells close together so the T cells can more effectively kill the cancer cells. Some BiTEs are being used to treat certain types of cancer, including acute lymphoblastic leukemia, multiple myeloma, lymphoma, and small cell lung cancer. They are a type of targeted therapy. Also called bispecific T-cell engager.
  bivalent vaccine: (by-VAY-lent vak-SEEN)
    Pronunciation of dictionary term "bivalent vaccine"
    A vaccine that works by stimulating an immune response against two different antigens, such as two different viruses or other microorganisms. For example, Cervarix is a bivalent vaccine that helps protect the body against infection with two different types of human papillomaviruses (HPV).
  bizelesin: (by-ZEH-leh-sin)
    Pronunciation of dictionary term "bizelesin"
    An anticancer drug that belongs to the family of drugs called alkylating agents. It is also an antitumor antibiotic.
  Bizengri: (bi-ZEN-gree)
    Pronunciation of dictionary term "Bizengri"
    A drug used to treat adults with non-small cell lung cancer and a type of pancreatic cancer called pancreatic adenocarcinoma. It is used in patients whose cancer has an NRG1 gene fusion, and has spread or cannot be removed by surgery after systemic therapy. It is also being studied in the treatment of other types of cancer. Bizengri binds to two proteins called HER2 and HER3, which are found on some cancer cells. This may help keep cancer cells from growing and may help the immune system kill cancer cells. Bizengri is a type of monoclonal antibody. Also called zenocutuzumab.
  BL22 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "BL22 immunotoxin"
    A bacterial toxic substance linked to an antibody that attaches to cancer cells and kills them. It belongs to the family of drugs called bacterial immunotoxins.
  black cohosh: (blak KOH-osh)
    Pronunciation of dictionary term "black cohosh"
    An eastern North American perennial herb. A substance obtained from the root of the plant has been used in some cultures to treat a number of medical problems. It is being studied in the treatment of hot flashes and other symptoms of menopause. The scientific name is Cimicifuga racemosa. Also called black snakeroot, bugbane, bugwort, and rattlesnake root.
    More Information
    - Black Cohosh
  black snakeroot: (blak SNAYK-root)
    Pronunciation of dictionary term "black snakeroot"
    An eastern North American perennial herb. A substance obtained from the root of the plant has been used in some cultures to treat a number of medical problems. It is being studied in the treatment of hot flashes and other symptoms of menopause. The scientific name is Cimicifuga racemosa. Also called black cohosh, bugbane, bugwort, and rattlesnake root.
    More Information
    - Black Cohosh
  Blackfan–Diamond anemia: (BLAK-fan-DY-uh-mund uh-NEE-mee-uh)
    Pronunciation of dictionary term "Blackfan–Diamond anemia"
    A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with Blackfan–Diamond anemia may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called congenital hypoplastic anemia, congenital pure red cell aplasia, DBA, Diamond-Blackfan anemia, erythrogenesis imperfecta, and inherited erythroblastopenia.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  bladder: (BLA-der)
    Pronunciation of dictionary term "bladder"
    The organ that stores urine.
    More Information
    - What Is Bladder Cancer?
    Anatomy of the male urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra passing through the penis. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the prostate.
    Anatomy of the female urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the female urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The uterus is also shown.
  bladder cancer: (BLA-der KAN-ser)
    Pronunciation of dictionary term "bladder cancer"
    Cancer that forms in tissues of the bladder (the organ that stores urine). Most bladder cancers are transitional cell carcinomas (cancer that begins in cells that normally make up the inner lining of the bladder). Other types include squamous cell carcinoma (cancer that begins in thin, flat cells) and adenocarcinoma (cancer that begins in cells that make and release mucus and other fluids). The cells that form squamous cell carcinoma and adenocarcinoma develop in the inner lining of the bladder as a result of chronic irritation and inflammation.
    More Information
    - What Is Bladder Cancer?
  blast: (blast)
    Pronunciation of dictionary term "blast"
    An immature blood cell.
  blast crisis: (blast KRY-sis)
    Pronunciation of dictionary term "blast crisis"
    A phase of chronic myelogenous leukemia in which tiredness, fever, and an enlarged spleen occur during the blastic phase, when more than 30% of the cells in the blood or bone marrow are blast cells (immature blood cells).
  blastic phase chronic myelogenous leukemia: (BLAS-tik fayz KRAH-nik MY-eh-LAH-jeh-nus loo-KEE-mee-uh)
    Pronunciation of dictionary term "blastic phase chronic myelogenous leukemia"
    A phase of chronic myelogenous leukemia in which 20% or more of the cells in the blood or bone marrow are blast cells (immature blood cells). When tiredness, fever, and an enlarged spleen occur during the blastic phase, it is called blast crisis.
  blastic plasmacytoid dendritic cell neoplasm: (BLAS-tik PLAZ-muh-SY-toyd den-DRIH-tik sel NEE-oh-PLA-zum)
    Pronunciation of dictionary term "blastic plasmacytoid dendritic cell neoplasm"
    A rare, fast-growing cancer that affects the blood, bone marrow, and skin. It can also affect the lymph nodes, spleen, and central nervous system. Most patients with blastic plasmacytoid dendritic cell neoplasm have red-brown or deep purple skin lesions on one or more areas of the body. Blastic plasmacytoid dendritic cell neoplasm usually occurs in older adults and is difficult to diagnose and treat. Also called BPDCN.
  Blenoxane: (bleh-NOK-sayn)
    Pronunciation of dictionary term "Blenoxane"
    A drug that is used to treat many types of cancer and is being studied in the treatment of other types of cancer. It comes from the bacterium Streptomyces verticillus. Blenoxane damages DNA and may kill cancer cells. It is a type of antineoplastic antibiotic. Also called bleomycin sulfate.
  Blenrep: (BLEN-rep)
    Pronunciation of dictionary term "Blenrep"
    A drug used to treat adults with multiple myeloma that relapsed (came back) or did not get better after treatment with at least four other anticancer therapies, including an anti-CD38 monoclonal antibody, a proteasome inhibitor, and an immunomodulatory agent. Blenrep contains a monoclonal antibody that binds to an antigen called BCMA, which is found on myeloma cells and some types of immune cells. It also contains an anticancer drug, which may help kill cancer cells. Blenrep is a type of antibody-drug conjugate. Also called belantamab mafodotin.
    More Information
    - Belantamab Mafodotin-blmf
  bleomycin: (blee-oh-MY-sin)
    Pronunciation of dictionary term "bleomycin"
    The active ingredient in a drug used to treat many types of cancer, including Hodgkin lymphoma, non-Hodgkin lymphoma, penile cancer, testicular cancer, and squamous cell carcinoma of the cervix, head and neck, and vulva. It is also used to treat malignant pleural effusion. It is also being studied in the treatment of other types of cancer. Bleomycin comes from the bacterium Streptomyces verticillus. It damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic.
    More Information
    - Bleomycin Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/bleomycin)
  bleomycin sulfate: (blee-oh-MY-sin SUL-fayt)
    Pronunciation of dictionary term "bleomycin sulfate"
    A drug that comes from the bacterium Streptomyces verticillus and is used alone or with other drugs to treat many types of cancer, including Hodgkin lymphoma, non-Hodgkin lymphoma, testicular cancer, malignant pleural effusion, and squamous cell carcinoma of the cervix, head and neck, penis, and vulva. It is also being studied in the treatment of other types of cancer. Bleomycin sulfate damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic. Bleomycin is the active ingredient of bleomycin sulfate.
    More Information
    - Bleomycin Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/bleomycin)
  blessed thistle: (... THIH-sul)
    Pronunciation of dictionary term "blessed thistle"
    A plant whose leaves, stems, and flowers have been used in some cultures to treat certain medical problems. Blessed thistle may have anti-inflammatory and anticancer effects. The scientific name is Cnicus benedictus. Also called cardin, holy thistle, spotted thistle, and St. Benedict's thistle.
  blinatumomab: (blih-nuh-TOO-moh-mab)
    Pronunciation of dictionary term "blinatumomab"
    A drug used to treat adults and children aged 1 month and older with certain types of B-cell acute lymphoblastic leukemia that are CD19 positive (expresses the protein CD19). It is also being studied in the treatment of other types of cancer. Blinatumomab binds to CD19, which is found on most B cells (a type of white blood cell) and some types of leukemia cells. It also binds to a protein called CD3, which is found on T cells (another type of white blood cell). This may help the immune system kill cancer cells. Blinatumomab is a type of bispecific T-cell engager. Also called Blincyto.
    More Information
    - Blinatumomab (https://www.cancer.gov/about-cancer/treatment/drugs/blinatumomab)
  Blincyto: (blin-SY-toh)
    Pronunciation of dictionary term "Blincyto"
    A drug used to treat adults and children aged 1 month and older with certain types of B-cell acute lymphoblastic leukemia that are CD19 positive (expresses the protein CD19). It is also being studied in the treatment of other types of cancer. Blincyto binds to CD19, which is found on most B cells (a type of white blood cell) and some types of leukemia cells. It also binds to a protein called CD3, which is found on T cells (another type of white blood cell). This may help the immune system kill cancer cells. Blincyto is a type of bispecific T-cell engager. Also called blinatumomab.
    More Information
    - Blinatumomab (https://www.cancer.gov/about-cancer/treatment/drugs/blinatumomab)
  blinded study: (BLINE-ded STUH-dee)
    Pronunciation of dictionary term "blinded study"
    A type of study in which the patients (single-blinded) or the patients and their doctors (double-blinded) do not know which drug or treatment is being given. The opposite of a blinded study is an open label study.
  blister: (BLIH-ster)
    Pronunciation of dictionary term "blister"
    A fluid-filled sac in the outer layer of skin. It can be caused by rubbing, heat, or diseases of the skin. Also called skin vesicle.
  BLM gene: (… jeen)
    Pronunciation of dictionary term "BLM gene"
    A gene that makes a protein involved in maintaining the structure of DNA when DNA is copied in a cell and in repairing damaged DNA. Mutations (changes) in the BLM gene may cause cells to lose their ability to repair damaged DNA, which may lead to abnormal cell growth. BLM gene mutations have been found in an inherited condition called Bloom syndrome. People with this condition have an increased risk of developing cancer at an early age, especially squamous cell skin cancer, leukemia, lymphoma, and gastrointestinal tract cancer.
    More Information
    - BLM gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/blm/)
  bloating: (BLOH-ting)
    Pronunciation of dictionary term "bloating"
    A swelling or feeling of fullness in the abdomen. Bloating is usually the result of gas in the intestines and can be caused by many things, including overeating, lactose intolerance, and constipation. Bloating can also be a side effect of cancer or cancer treatment.
  blood: (blud)
    Pronunciation of dictionary term "blood"
    A tissue with red blood cells, white blood cells, platelets, and other substances suspended in fluid called plasma. Blood takes oxygen and nutrients to the tissues, and carries away wastes.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  blood cancer: (blud KAN-ser)
    Pronunciation of dictionary term "blood cancer"
    Cancer that begins in blood-forming tissue, such as the bone marrow, or in the cells of the immune system. Examples of blood cancer are leukemia, lymphoma, and multiple myeloma. Also called hematologic cancer.
    More Information
    - Cancers by Body Location/System: Hematologic/Blood (https://www.cancer.gov/types/by-body-location)
  blood cell count: (blud sel kownt)
    Pronunciation of dictionary term "blood cell count"
    A measure of the number of red blood cells, white blood cells, and platelets in the blood. The amount of hemoglobin (substance in the blood that carries oxygen) and the hematocrit (the amount of whole blood that is made up of red blood cells) are also measured. A blood cell count is used to help diagnose and monitor many conditions. Also called CBC, complete blood count, and full blood count.
    Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
    Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
  blood cell count with differential: (blud sel kownt … dih-feh-REN-shul)
    Pronunciation of dictionary term "blood cell count with differential"
    A measure of the number of red blood cells, white blood cells, and platelets in the blood, including the different types of white blood cells (neutrophils, lymphocytes, monocytes, basophils, and eosinophils). The amount of hemoglobin (substance in the blood that carries oxygen) and the hematocrit (the amount of whole blood that is made up of red blood cells) are also measured. A blood cell count with differential is used to help diagnose and monitor many different conditions, including anemia and infection. Also called CBC with differential.
  blood chemistry study: (blud KEH-mih-stree STUH-dee)
    Pronunciation of dictionary term "blood chemistry study"
    A test done on a sample of blood to measure the amount of certain substances in the body. These substances include electrolytes (such as sodium, potassium, and chloride), fats, proteins, glucose (sugar), and enzymes. Blood chemistry studies give important information about how well a person’s kidneys, liver, and other organs are working. An abnormal amount of a substance in the blood can be a sign of disease or side effect of treatment. Blood chemistry studies are used to help diagnose and monitor many conditions before, during, and after treatment. Also called blood chemistry test.
  blood chemistry test: (blud KEH-mih-stree …)
    Pronunciation of dictionary term "blood chemistry test"
    A test done on a sample of blood to measure the amount of certain substances in the body. These substances include electrolytes (such as sodium, potassium, and chloride), fats, proteins, glucose (sugar), and enzymes. Blood chemistry tests give important information about how well a person’s kidneys, liver, and other organs are working. An abnormal amount of a substance in the blood can be a sign of disease or side effect of treatment. Blood chemistry tests are used to help diagnose and monitor many conditions before, during, and after treatment. Also called blood chemistry study.
  blood circulation: (blud ser-kyoo-LAY-shun)
    Pronunciation of dictionary term "blood circulation"
    The flow or movement of blood throughout the body. Blood carries oxygen, nutrients, and other important substances from the heart, through the blood vessels, to the rest of the body’s cells, tissues, and organs. It also helps to get rid of waste products, such as carbon dioxide, from the body. Also called bloodstream.
  blood clot: (blud klot)
    Pronunciation of dictionary term "blood clot"
    A mass of blood that forms when blood platelets, proteins, and cells stick together. When a blood clot is attached to the wall of a blood vessel, it is called a thrombus. When it moves through the bloodstream and blocks the flow of blood in another part of the body, it is called an embolus.
  blood culture: (blud KUL-cher)
    Pronunciation of dictionary term "blood culture"
    A laboratory test to check for bacteria, yeast, fungi, or other microorganisms in the blood. Blood cultures can help identify the type of microorganism that is causing an infection. This helps determine the best treatment. They may be used to help diagnose septicemia (a serious blood infection) and other conditions.
  blood draw: (blud …)
    Pronunciation of dictionary term "blood draw"
    A procedure in which a needle is used to take blood from a vein, usually for laboratory testing. A blood draw may also be done to remove extra red blood cells from the blood, to treat certain blood disorders. Also called phlebotomy and venipuncture.
  blood poisoning: (blud POY-zuh-ning)
    Pronunciation of dictionary term "blood poisoning"
    Disease caused by the spread of bacteria and their toxins in the bloodstream. Also called septicemia and toxemia.
  blood pressure: (blud PREH-sher)
    Pronunciation of dictionary term "blood pressure"
    The force of circulating blood on the walls of the arteries. Blood pressure is taken using two measurements: systolic (measured when the heart beats, when blood pressure is at its highest) and diastolic (measured between heart beats, when blood pressure is at its lowest). Blood pressure is written with the systolic blood pressure first, followed by the diastolic blood pressure (for example 120/80).
  blood stasis: (blud STAY-sis)
    Pronunciation of dictionary term "blood stasis"
    In traditional Chinese medicine, a condition described as slowing or pooling of blood, which may cause pain or other symptoms.
  blood stem cell: (blud stem sel)
    Pronunciation of dictionary term "blood stem cell"
    An immature cell that can develop into all types of blood cells, including white blood cells, red blood cells, and platelets. Blood stem cells are found in the peripheral blood and the bone marrow. Also called hematopoietic stem cell.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. Drawing shows a myeloid stem cell becoming a red blood cell, platelet, or myeloblast, which then becomes a white blood cell. Drawing also shows a lymphoid stem cell becoming a lymphoblast and then one of several different types of white blood cells.
  blood sugar: (blud SHUH-ger)
    Pronunciation of dictionary term "blood sugar"
    Glucose (a type of sugar) found in the blood. Also called glycemia.
  blood test: (blud test)
    Pronunciation of dictionary term "blood test"
    A test done on a sample of blood to measure the amount of certain substances in the blood or to count different types of blood cells. Blood tests may be done to look for signs of disease or agents that cause disease, to check for antibodies or tumor markers, or to see how well treatments are working.
  blood thinner: (blud THIH-ner)
    Pronunciation of dictionary term "blood thinner"
    A substance that is used to prevent and treat blood clots in blood vessels and the heart. Also called anticoagulant.
  blood transfusion: (blud tranz-FYOO-zhun)
    Pronunciation of dictionary term "blood transfusion"
    A procedure in which whole blood or parts of blood are put into a patient’s bloodstream through a vein. The blood may be donated by another person or it may have been taken from the patient and stored until needed. Also called transfusion.
    Blood transfusion. A patient is given blood through an intravenous (IV) catheter in the arm. The blood may be donated by another person, or it may have been taken from the patient and stored until needed.
    Blood transfusion; drawing of red blood cells being given to a patient through an intravenous (IV) catheter in the arm.
  blood urea nitrogen: (blud yoo-REE-uh NY-troh-jen)
    Pronunciation of dictionary term "blood urea nitrogen"
    Nitrogen in the blood that comes from urea (a substance formed by the breakdown of protein in the liver). The kidneys filter urea out of the blood and into the urine. A high level of urea nitrogen in the blood may be a sign of a kidney problem. Also called BUN and urea nitrogen.
  blood vessel: (blud VEH-sel)
    Pronunciation of dictionary term "blood vessel"
    A tube through which the blood circulates in the body. Blood vessels include a network of arteries, arterioles, capillaries, venules, and veins.
  blood-brain barrier: (blud-brayn BAYR-ee-er)
    Pronunciation of dictionary term "blood-brain barrier"
    A network of blood vessels and tissue that is made up of closely spaced cells and helps keep harmful substances from reaching the brain. The blood-brain barrier lets some substances, such as water, oxygen, carbon dioxide, and general anesthetics, pass into the brain. It also keeps out bacteria and other substances, such as many anticancer drugs. Also called BBB.
  blood-brain barrier disruption: (blud-brayn BAYR-ee-er dis-RUP-shun)
    Pronunciation of dictionary term "blood-brain barrier disruption"
    The use of drugs to create openings between cells in the blood-brain barrier. The blood-brain barrier is a protective network of blood vessels and tissue that protects the brain from harmful substances, but can also prevent anticancer drugs from reaching the brain. Once the barrier is opened, anticancer drugs may be infused into an artery that goes to the brain, in order to treat brain tumors. Also called BBBD.
  bloodstream: (BLUD-streem)
    Pronunciation of dictionary term "bloodstream"
    The flow or movement of blood throughout the body. Blood carries oxygen, nutrients, and other important substances from the heart, through the blood vessels, to the rest of the body’s cells, tissues, and organs. It also helps to get rid of waste products, such as carbon dioxide, from the body. Also called blood circulation.
  Bloom syndrome: (… SIN-drome)
    Pronunciation of dictionary term "Bloom syndrome"
    A rare, inherited disorder marked by shorter than average height, a narrow face, a red skin rash that occurs on sun-exposed areas of the body, and an increased risk of cancer. The rash usually occurs on the face, arms, and back of the hands. Small clusters of enlarged blood vessels may appear in the rash and in the eyes. Other signs and symptoms include patches of skin that may be lighter or darker than the skin around them, a small jaw and large ears, a high-pitched voice, fertility problems, learning problems, and other growth and developmental problems. People with this disorder have an increased risk of diabetes, chronic obstructive pulmonary disease, and frequent ear and lung infections. They also have an increased risk of developing cancer at an early age, especially squamous cell skin cancer, leukemia, lymphoma, and gastrointestinal tract cancer. Bloom syndrome is caused by a mutation (change) in the BLM gene that causes cells to have abnormal breaks in the chromosomes. Also called Bloom-Torre-Machacek syndrome.
    More Information
    - Bloom syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/915/bloom-syndrome)
    - Bloom syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/bloom-syndrome/)
  Bloom-Torre-Machacek syndrome: (... TOR-ay-muh-HA-chek SIN-drome)
    Pronunciation of dictionary term "Bloom-Torre-Machacek syndrome"
    A rare, inherited disorder marked by shorter than average height, a narrow face, a red skin rash that occurs on sun-exposed areas of the body, and an increased risk of cancer. The rash usually occurs on the face, arms, and back of the hands. Small clusters of enlarged blood vessels may appear in the rash and in the eyes. Other signs and symptoms include patches of skin that may be lighter or darker than the skin around them, a small jaw and large ears, a high-pitched voice, fertility problems, learning problems, and other growth and developmental problems. People with this disorder have an increased risk of diabetes, chronic obstructive pulmonary disease, and frequent ear and lung infections. They also have an increased risk of developing cancer at an early age, especially squamous cell skin cancer, leukemia, lymphoma, and gastrointestinal tract cancer. Bloom-Torre-Machacek syndrome is caused by a mutation (change) in the BLM gene that causes cells to have abnormal breaks in the chromosomes. Also called Bloom syndrome.
    More Information
    - Bloom syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/915/bloom-syndrome)
    - Bloom syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/bloom-syndrome/)
  BMD: A measure of the amount of minerals (mostly calcium and phosphorous) contained in a certain volume of bone. BMD measurements are used to diagnose osteoporosis (a condition marked by decreased bone mass), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. Low BMD can occur in patients treated for cancer. Also called bone density, bone mass, and bone mineral density.
  BMD scan: (… skan)
    Pronunciation of dictionary term "BMD scan"
    A procedure that measures the amount of calcium and other minerals in a bone by passing x-rays with two different energy levels through the bone. A BMD scan shows the strength and thickness of a bone and is usually done in the lower spine, hip, lower arm, wrist, fingers, and heel. It is used to diagnose osteoporosis (a condition of lower bone density), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. A BMD scan also measures fat and muscle composition in specific parts of the body, such as the arms, legs, and pelvis. Also called bone densitometry, bone mineral density scan, DEXA scan, dual energy x-ray absorptiometry, and DXA.
  BMI: Body mass index. A measure that relates body weight to height. BMI is sometimes used to measure total body fat and whether a person is a healthy weight. Excess body fat is linked to an increased risk of some diseases including heart disease and some cancers. Also called body mass index.
    More Information
    - Obesity and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity/obesity-fact-sheet)
  BMS-182751: A substance being studied in the treatment of prostate and other types of cancer. It contains the metal platinum and may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called JM 216 and satraplatin.
  BMS-184476: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called mitotic inhibitors.
  BMS-188797: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called taxane analogs.
  BMS-214662: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called farnesyltransferase inhibitors.
  BMS-247550: A drug used alone or with capecitabine to treat breast cancer that is locally advanced or has spread to other parts of the body and did not get better after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. BMS-247550 blocks cell growth by stopping cell division and may kill cancer cells. It is a type of epothilone analog and a type of antimicrotubule agent. Also called ixabepilone and Ixempra.
    More Information
    - Ixabepilone (https://www.cancer.gov/about-cancer/treatment/drugs/ixabepilone)
  BMS-275291: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called matrix metalloproteinase inhibitors (MMPIs).
  BMS-354825: A drug used alone or with other drugs to treat adults and children aged 1 year and older with certain types of chronic myeloid leukemia or acute lymphoblastic leukemia that are Philadelphia chromosome positive. It is also being studied in the treatment of other types of cancer. BMS-354825 blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called dasatinib and Sprycel.
    More Information
    - Dasatinib (https://www.cancer.gov/about-cancer/treatment/drugs/dasatinib)
  BMS-599626: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called protein tyrosine kinase inhibitors.
  BMT: A procedure in which a patient receives healthy stem cells (blood-forming cells) to replace their own stem cells that have been destroyed by treatment with radiation or high doses of chemotherapy. The healthy stem cells may come from the bone marrow of the patient or from a related or unrelated donor. A BMT may be autologous (using a patient’s own stem cells that were collected and saved before treatment), allogeneic (using stem cells from a related or unrelated donor), or syngeneic (using stem cells donated by an identical twin). Also called bone marrow transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  BNCT: A type of radiation therapy. A substance that contains boron is injected into a blood vessel. The boron collects in tumor cells. The patient then receives radiation therapy with atomic particles called neutrons. The neutrons react with the boron to kill the tumor cells without harming normal cells. BNCT is being studied as a treatment for glioblastoma multiforme and recurrent head and neck cancer. Also called boron neutron capture therapy.
  board certified oncology pharmacy specialist: (bord SER-tih-fide on-KAH-loh-jee FAR-muh-see SPEH-shuh-list)
    Pronunciation of dictionary term "board certified oncology pharmacy specialist"
    A licensed pharmacist with special training in how to design, give, monitor, and change chemotherapy for cancer patients. Also called BCOP and oncology pharmacy specialist.
  body image: (BAH-dee IH-mij)
    Pronunciation of dictionary term "body image"
    The way a person thinks about his or her body and how it looks to others.
  body mass index: (BAH-dee mas IN-dex)
    Pronunciation of dictionary term "body mass index"
    A measure that relates body weight to height. BMI is sometimes used to measure total body fat and whether a person is a healthy weight. Excess body fat is linked to an increased risk of some diseases including heart disease and some cancers. Also called BMI.
    More Information
    - Obesity and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity/obesity-fact-sheet)
  bolus dose: (BOH-lus...)
    Pronunciation of dictionary term "bolus dose"
    A single dose of a drug or other substance given over a short period of time. It is usually given by infusion or injection into a blood vessel. It may also be given by mouth.
  bombesin: (BOM-beh-sin)
    Pronunciation of dictionary term "bombesin"
    A peptide (small protein) found in the brain, gastrointestinal tract, and lungs. It causes the release of certain hormones and enzymes. It also causes smooth muscles to contract. Bombesin is found at high levels on small cell lung cancer cells and on other types of cancer cells. It is a type of neuropeptide and a type of hormone.
  BON: The necrosis (death) of bone tissue caused by treatment with a bisphosphonate (a drug or substance used to treat osteoporosis, bone pain caused by some types of cancer, and high blood calcium). It commonly occurs in the jaw bones. There may be pain, swelling and infection in the areas of necrosis. Also called bisphosphonate-associated osteonecrosis.
  bone cancer: (bone KAN-ser)
    Pronunciation of dictionary term "bone cancer"
    Primary bone cancer is cancer that forms in cells of the bone. Some types of primary bone cancer are osteosarcoma, Ewing sarcoma, malignant fibrous histiocytoma, and chondrosarcoma. Secondary bone cancer is cancer that spreads to the bone from another part of the body (such as the prostate, breast, or lung).
    More Information
    - Bone Cancer (https://www.cancer.gov/types/bone)
    Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.
    Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.
  bone densitometry: (... den-sih-TAH-meh-tree)
    Pronunciation of dictionary term "bone densitometry"
    A procedure that measures the amount of calcium and other minerals in a bone by passing x-rays with two different energy levels through the bone. A bone densitometry shows the strength and thickness of a bone and is usually done in the lower spine, hip, lower arm, wrist, fingers, and heel. It is used to diagnose osteoporosis (a condition of lower bone density), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. A bone densitometry also measures fat and muscle composition in specific parts of the body, such as the arms, legs, and pelvis. Also called BMD scan, bone mineral density scan, DEXA scan, dual energy x-ray absorptiometry, and DXA.
  bone density: (...DEN-sih-tee)
    Pronunciation of dictionary term "bone density"
    A measure of the amount of minerals (mostly calcium and phosphorous) contained in a certain volume of bone. Bone density measurements are used to diagnose osteoporosis (a condition marked by decreased bone mass), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. Low bone density can occur in patients treated for cancer. Also called BMD, bone mass, and bone mineral density.
  bone marrow: (bone MAYR-oh)
    Pronunciation of dictionary term "bone marrow"
    The soft, spongy tissue that has many blood vessels and is found in the center of most bones. There are two types of bone marrow: red and yellow. Red bone marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow bone marrow is made mostly of fat and contains stem cells that can become cartilage, fat, or bone cells.
    Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.
    Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.
  bone marrow ablation: (bone MAYR-oh a-BLAY-shun)
    Pronunciation of dictionary term "bone marrow ablation"
    A procedure to destroy bone marrow using radiation or high doses of anticancer drugs. It is done before a bone marrow or blood stem cell transplant to kill cancer cells and bone marrow cells. This makes room for healthy stem cells.
  bone marrow aspiration: (bone MAYR-oh AS-pih-RAY-shun)
    Pronunciation of dictionary term "bone marrow aspiration"
    A procedure in which a small sample of bone marrow is removed, usually from the hip bone, breastbone, or thigh bone. A small area of skin and the surface of the bone underneath are numbed with an anesthetic. Then, a special wide needle is pushed into the bone. A sample of liquid bone marrow is removed with a syringe attached to the needle. The bone marrow is sent to a laboratory to be looked at under a microscope. This procedure may be done at the same time as a bone marrow biopsy.
    Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
    Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
  bone marrow aspiration and biopsy: (bone MAYR-oh AS-pih-RAY-shun ... BY-op-see)
    Pronunciation of dictionary term "bone marrow aspiration and biopsy"
    A procedure in which a small sample of bone marrow (soft, sponge-like tissue in the center of most bones) and bone is removed. A small area of skin and the surface of the bone underneath are numbed with an anesthetic. Then a special wide needle is pushed into the bone. A sample of liquid bone marrow is removed with a syringe attached to the needle. The syringe is then removed and the needle is rotated to remove a sample of the bone and the bone marrow. Both the bone marrow and bone samples are sent to a laboratory to be looked at under a microscope.
    Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
    Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
  bone marrow biopsy: (bone MAYR-oh BY-op-see)
    Pronunciation of dictionary term "bone marrow biopsy"
    A procedure in which a small sample of bone with bone marrow inside it is removed, usually from the hip bone. A small area of skin and the surface of the bone underneath are numbed with an anesthetic. Then, a special, wide needle is pushed into the bone and rotated to remove a sample of bone with the bone marrow inside it. The sample is sent to a laboratory to be looked at under a microscope. This procedure may be done at the same time as a bone marrow aspiration.
    Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
    Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
  bone marrow cancer: (bone MAYR-oh KAN-ser)
    Pronunciation of dictionary term "bone marrow cancer"
    Cancer that forms in the blood-forming stem cells of the bone marrow (soft sponge-like tissue in the center of most bones). Bone marrow cancer includes leukemias and multiple myeloma.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    - Leukemia (https://www.cancer.gov/types/leukemia)
    Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.
    Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.
  bone marrow metastasis: (bone MAYR-oh meh-TAS-tuh-sis)
    Pronunciation of dictionary term "bone marrow metastasis"
    Cancer that has spread from the original (primary) tumor to the bone marrow.
  bone marrow transplant: (bone MAYR-oh TRANZ-plant)
    Pronunciation of dictionary term "bone marrow transplant"
    A procedure in which a patient receives healthy stem cells (blood-forming cells) to replace their own stem cells that have been destroyed by treatment with radiation or high doses of chemotherapy. The healthy stem cells may come from the bone marrow of the patient or from a related or unrelated donor. A bone marrow transplant may be autologous (using a patient’s own stem cells that were collected and saved before treatment), allogeneic (using stem cells from a related or unrelated donor), or syngeneic (using stem cells donated by an identical twin). Also called BMT.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  bone mass: (bone mas)
    Pronunciation of dictionary term "bone mass"
    A measure of the amount of minerals (mostly calcium and phosphorous) contained in a certain volume of bone. Bone mass measurements are used to diagnose osteoporosis (a condition marked by decreased bone mass), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. Low bone mass can occur in patients treated for cancer. Also called BMD, bone density, and bone mineral density.
  bone metastasis: (...meh-TAS-tuh-sis)
    Pronunciation of dictionary term "bone metastasis"
    Cancer that has spread from the original (primary) tumor to the bone.
  bone mineral density: (... MIH-neh-rul DEN-sih-tee)
    Pronunciation of dictionary term "bone mineral density"
    A measure of the amount of minerals (mostly calcium and phosphorous) contained in a certain volume of bone. Bone mineral density measurements are used to diagnose osteoporosis (a condition marked by decreased bone mass), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. Low bone mineral density can occur in patients treated for cancer. Also called BMD, bone density, and bone mass.
  bone mineral density scan: (... MIH-neh-rul DEN-sih-tee skan)
    Pronunciation of dictionary term "bone mineral density scan"
    A procedure that measures the amount of calcium and other minerals in a bone by passing x-rays with two different energy levels through the bone. A bone mineral density scan shows the strength and thickness of a bone and is usually done in the lower spine, hip, lower arm, wrist, fingers, and heel. It is used to diagnose osteoporosis (a condition of lower bone density), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. A bone mineral density scan also measures fat and muscle composition in specific parts of the body, such as the arms, legs, and pelvis. Also called BMD scan, bone densitometry, DEXA scan, dual energy x-ray absorptiometry, and DXA.
  bone scan: (bone skan)
    Pronunciation of dictionary term "bone scan"
    A procedure to check for abnormal areas or damage in the bones. A very small amount of radioactive material is injected into a vein and travels through the blood. The radioactive material collects in the bones and is detected by a scanner (a special camera that takes pictures of the inside of the body). A bone scan may be used to diagnose bone tumors or cancer that has spread to the bone. It may also be used to help diagnose fractures, bone infections, or other bone problems. Also called bone scintigraphy.
    Bone scan. A small amount of radioactive material is injected into the patient's bloodstream and collects in abnormal cells in the bones. As the patient lies on a table that slides under the scanner, the radioactive material is detected and images are made on a computer screen or film.
    Bone scan; drawing shows patient lying on a table that slides under the scanner, a technician operating the scanner, and a monitor that will show images made during the scan.
  bone scintigraphy: (... sin-TIH-gruh-fee)
    Pronunciation of dictionary term "bone scintigraphy"
    A procedure to check for abnormal areas or damage in the bones. A very small amount of radioactive material is injected into a vein and travels through the blood. The radioactive material collects in the bones and is detected by a scanner (a special camera that takes pictures of the inside of the body). A bone scintigraphy may be used to diagnose bone tumors or cancer that has spread to the bone. It may also be used to help diagnose fractures, bone infections, or other bone problems. Also called bone scan.
    Bone scan. A small amount of radioactive material is injected into the patient's bloodstream and collects in abnormal cells in the bones. As the patient lies on a table that slides under the scanner, the radioactive material is detected and images are made on a computer screen or film.
    Bone scan; drawing shows patient lying on a table that slides under the scanner, a technician operating the scanner, and a monitor that will show images made during the scan.
  bone tissue: (… TIH-shoo)
    Pronunciation of dictionary term "bone tissue"
    Tissue that gives strength and structure to bones. Bone is made up of compact tissue (the hard, outer layer) and cancellous tissue (the spongy, inner layer that contains red marrow). Bone tissue is maintained by bone-forming cells called osteoblasts and cells that break down bone called osteoclasts. Bones also contain blood vessels, nerves, proteins, vitamins, and minerals. Also called osseous tissue.
    Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.
    Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.
  bone-seeking radioisotope: (bone-SEE-king RAY-dee-oh-I-soh-tope)
    Pronunciation of dictionary term "bone-seeking radioisotope"
    A radioactive substance that is given through a vein, and collects in bone cells and in tumor cells that have spread to the bone. It kills cancer cells by giving off low-level radiation.
  booster: (BOO-ster)
    Pronunciation of dictionary term "booster"
    In medicine, refers to a vaccination given after a previous vaccination. A booster helps maintain or increase a protective immune response.
  borderline breast disease: (BOR-der-line brest dih-ZEEZ)
    Pronunciation of dictionary term "borderline breast disease"
    A group of conditions marked by changes in breast tissue that are not cancer but may become cancer. Types of borderline breast disease include atypical ductal hyperplasia, atypical lobular hyperplasia, lobular carcinoma in situ, and complex sclerosing lesion (radial scar). Having borderline breast disease increases the risk of breast cancer. Also called BBD.
  borderline personality disorder: (BOR-der-LINE PER-suh-NA-lih-tee dis-OR-der)
    Pronunciation of dictionary term "borderline personality disorder"
    A serious mental illness marked by unstable moods and impulsive behavior. People with borderline personality disorder have problems with relationships, family and work life, long-term planning, and self-identity. Symptoms include intense bouts of anger, depression, and anxiety that may lead to self-injury or suicide, drug or alcohol abuse, excessive spending, binge eating, or risky sex. A person with borderline personality disorder who is diagnosed with cancer may be at an increased risk of suicide. Also called BPD.
  boron neutron capture therapy: (BOR-on NOO-tron KAP-cher THAYR-uh-pee)
    Pronunciation of dictionary term "boron neutron capture therapy"
    A type of radiation therapy. A substance that contains boron is injected into a blood vessel. The boron collects in tumor cells. The patient then receives radiation therapy with atomic particles called neutrons. The neutrons react with the boron to kill the tumor cells without harming normal cells. Boron neutron capture therapy is being studied as a treatment for glioblastoma multiforme and recurrent head and neck cancer. Also called BNCT.
  boron phenylalanine: (BOR-on feh-nil-A-luh-neen)
    Pronunciation of dictionary term "boron phenylalanine"
    A substance used in a type of radiation therapy called boron neutron capture therapy. Boron phenylalanine is injected into a blood vessel and collects in tumor cells. The patient then receives radiation therapy with atomic particles called neutrons. The neutrons react with boron phenylalanine to kill the tumor cells without harming normal cells. Also called BPA.
  boronophenylalanine-fructose complex: (BOR-on-oh-feh-nil-A-luh-neen-FROOK-tose KOM-plex)
    Pronunciation of dictionary term "boronophenylalanine-fructose complex"
    A substance used in a type of radiation therapy called boron neutron capture therapy. Boronophenylalanine-fructose complex is injected into a blood vessel and collects in tumor cells. The patient then receives radiation therapy with atomic particles called neutrons. The neutrons react with the boron in boronophenylalanine-fructose complex, producing radioactive particles that kill the tumor cells without harming normal cells. Also called BPA-F.
  bortezomib: (bor-TEH-zoh-mib)
    Pronunciation of dictionary term "bortezomib"
    A drug used to treat adults with multiple myeloma or mantle cell lymphoma. It is also being studied in the treatment of other types of cancer. Bortezomib blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called PS-341 and Velcade.
    More Information
    - Bortezomib (https://www.cancer.gov/about-cancer/treatment/drugs/bortezomib)
  Bosulif: (BAH-soo-lif)
    Pronunciation of dictionary term "Bosulif"
    A drug used to treat adults and children aged 1 year and older with chronic myelogenous leukemia that is Philadelphia chromosome positive. It is used in some newly diagnosed patients. It is also used in patients who cannot be treated with or have not gotten better after other treatment. It is also being studied in the treatment of other types of cancer. Bosulif blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called bosutinib.
    More Information
    - Bosutinib (https://www.cancer.gov/about-cancer/treatment/drugs/bosutinib)
  bosutinib: (bah-SOO-tih-nib)
    Pronunciation of dictionary term "bosutinib"
    A drug used to treat adults and children aged 1 year and older with chronic myelogenous leukemia that is Philadelphia chromosome positive. It is used in some newly diagnosed patients. It is also used in patients who cannot be treated with or have not gotten better after other treatment. It is also being studied in the treatment of other types of cancer. Bosutinib blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Bosulif.
    More Information
    - Bosutinib (https://www.cancer.gov/about-cancer/treatment/drugs/bosutinib)
  Boswellia serrata: (bos-WEH-lee-uh seh-RAY-tuh)
    Pronunciation of dictionary term "Boswellia serrata"
    A tree that belongs to the incense tree family. The tree’s amber-colored resin is used in incense. The resin has anti-inflammatory effects and has been used to treat arthritis, asthma, and ulcerative colitis. It is also being studied in the treatment of brain tumors. Also called frankincense tree.
  botanical: (buh-TA-nih-kul)
    Pronunciation of dictionary term "botanical"
    Having to do with, or derived from, plants.
  Botox: (BOH-tox)
    Pronunciation of dictionary term "Botox"
    A toxin made by the bacterium Clostridium botulinum. It can cause food poisoning. The drug Botox is a form of the toxin that can be used in small amounts to treat certain medical conditions. These include severe underarm sweating and severe muscle spasms in the neck and shoulders. Botox is also used to smooth wrinkles on the face. It is being studied in the treatment of pain in patients with skin leiomyomas (benign smooth muscle tumors) and other conditions. Also called botulinum toxin A and botulinum toxin type A.
  botulinum toxin A: (BAH-choo-LY-num TOK-sin …)
    Pronunciation of dictionary term "botulinum toxin A"
    A toxin made by the bacterium Clostridium botulinum. It can cause food poisoning. The drug Botox is a form of the toxin that can be used in small amounts to treat certain medical conditions. These include severe underarm sweating and severe muscle spasms in the neck and shoulders. Botulinum toxin A is also used to smooth wrinkles on the face. It is being studied in the treatment of pain in patients with skin leiomyomas (benign smooth muscle tumors) and other conditions. Also called Botox and botulinum toxin type A.
  botulinum toxin type A: (BAH-choo-LY-num TOK-sin ...)
    Pronunciation of dictionary term "botulinum toxin type A"
    A toxin made by the bacterium Clostridium botulinum. It can cause food poisoning. The drug Botox is a form of the toxin that can be used in small amounts to treat certain medical conditions. These include severe underarm sweating and severe muscle spasms in the neck and shoulders. Botulinum toxin type A is also used to smooth wrinkles on the face. It is being studied in the treatment of pain in patients with skin leiomyomas (benign smooth muscle tumors) and other conditions. Also called Botox and botulinum toxin A.
  bowel: (BOW-ul)
    Pronunciation of dictionary term "bowel"
    The long, tube-shaped organ in the abdomen that completes the process of digestion. The bowel has two parts, the small bowel and the large bowel. Also called intestine.
    More Information
    - Small Intestine Cancer (https://www.cancer.gov/types/small-intestine)
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
  bowel function: (BOW-ul FUNK-shun)
    Pronunciation of dictionary term "bowel function"
    The way the intestines work in terms of how often there are bowel movements, the ability to control when to have a bowel movement, and whether the stools are hard and dry as in constipation or watery as in diarrhea.
  bowel movement: (BOW-ul MOOV-ment)
    Pronunciation of dictionary term "bowel movement"
    Movement of feces (undigested food, bacteria, mucus, and cells from the lining of the intestines) through the bowel and out the anus. Also called defecation.
  bowel obstruction: (BOW-ul ub-STRUK-shun)
    Pronunciation of dictionary term "bowel obstruction"
    A partial or complete block of the small or large intestine that keeps food, liquid, gas, and stool from moving through the intestines in a normal way. Bowel obstructions may be caused by a twist in the intestines, hernias, inflammation, scar tissue from surgery, and certain types of cancer, such as cancers of the stomach, colon, and ovary. They may also be caused by conditions that affect the muscles of the intestine, such as paralysis. Signs and symptoms may include pain and swelling in the abdomen, constipation, diarrhea, vomiting, and problems passing gas. Most bowel obstructions occur in the small intestine. Also called intestinal obstruction.
    More Information
    - Bowel Obstruction and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/bowel-obstruction)
    A bowel obstruction is a serious condition that occurs when the small intestine or large intestine becomes blocked. The blockage stops food and stool from moving through the intestines. A bowel obstruction can be caused by certain cancers and cancer treatments.
    Drawing showing a large mass of dark brown stool in the large intestine caused by a tumor blockage. The tumor is at the end of the large intestine just before the rectum. Also shown are other parts of the digestive tract, including the stomach, small intestine, rectum, and anus.
  Bowen disease: (BOH-en dih-ZEEZ)
    Pronunciation of dictionary term "Bowen disease"
    A skin disease marked by scaly or thickened patches on the skin and often caused by prolonged exposure to arsenic. The patches often occur on sun-exposed areas of the skin and in older white men. These patches may become malignant (cancer). Also called precancerous dermatitis and precancerous dermatosis.
  Bowman-Birk inhibitor concentrate: (BOH-man-birk in-HIH-bih-ter KON-sen-TRAYT)
    Pronunciation of dictionary term "Bowman-Birk inhibitor concentrate"
    A substance that is made from soybeans and is being studied in the prevention of cancer. It blocks the action of enzymes that are needed for cancer cells to form. It is a type of protease inhibitor. Also called BBIC.
  BPA: A substance used in a type of radiation therapy called boron neutron capture therapy. BPA is injected into a blood vessel and collects in tumor cells. The patient then receives radiation therapy with atomic particles called neutrons. The neutrons react with BPA to kill the tumor cells without harming normal cells. Also called boron phenylalanine.
  BPA-F: A substance used in a type of radiation therapy called boron neutron capture therapy. BPA-F is injected into a blood vessel and collects in tumor cells. The patient then receives radiation therapy with atomic particles called neutrons. The neutrons react with the boron in BPA-F, producing radioactive particles that kill the tumor cells without harming normal cells. Also called boronophenylalanine-fructose complex.
  BPD: A serious mental illness marked by unstable moods and impulsive behavior. People with BPD have problems with relationships, family and work life, long-term planning, and self-identity. Symptoms include intense bouts of anger, depression, and anxiety that may lead to self-injury or suicide, drug or alcohol abuse, excessive spending, binge eating, or risky sex. A person with BPD who is diagnosed with cancer may be at an increased risk of suicide. Also called borderline personality disorder.
  BPDCN: A rare, fast-growing cancer that affects the blood, bone marrow, and skin. It can also affect the lymph nodes, spleen, and central nervous system. Most patients with BPDCN have red-brown or deep purple skin lesions on one or more areas of the body. BPDCN usually occurs in older adults and is difficult to diagnose and treat. Also called blastic plasmacytoid dendritic cell neoplasm.
  BPH: A benign (not cancer) condition in which the prostate gland is larger than normal. As the prostate gets bigger, it may press against the bladder and urethra, which can slow or block the flow of urine from the bladder. This can cause urinary symptoms, such as feeling a need to urinate often or right away, waking up many times during the night to urinate, trouble urinating, leaking urine, pain during urination or after ejaculation (the release of semen through the penis during orgasm), and blood in the urine. BPH does not increase a person’s risk of developing prostate cancer. However, if not treated, it can lead to a weak bladder, urinary retention, urinary tract infections, bladder stones, or bladder or kidney damage. BPH is most common in older men. Also called benign prostatic hyperplasia, benign prostatic hypertrophy, and enlarged prostate.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
    Normal prostate and benign prostatic hyperplasia (BPH). A normal prostate does not block the flow of urine from the bladder. An enlarged prostate presses on the bladder and urethra and blocks the flow of urine.
    Two-panel drawing shows normal male reproductive and urinary anatomy and benign prostatic hyperplasia (BPH). Panel on the left shows the normal prostate and flow of urine from the bladder through the urethra. Panel on the right shows an enlarged prostate pressing on the bladder and urethra, blocking the flow of urine.
  BPU: A substance being studied in the treatment of cancer. It is a type of antitubulin agent. Also called benzoylphenylurea.
  brachial plexopathy: (BRAY-kee-ul plek-SAH-puh-thee)
    Pronunciation of dictionary term "brachial plexopathy"
    A condition marked by numbness, tingling, pain, weakness, or limited movement in the arm or hand. It is caused by an impairment of the brachial plexus, a network of nerves that affect the arm and hand.
  brachial plexus: (BRAY-kee-ul PLEK-sus)
    Pronunciation of dictionary term "brachial plexus"
    A network of nerves that sends signals from the spine to the arm and hand.
  brachytherapy: (BRAY-kee-THAYR-uh-pee)
    Pronunciation of dictionary term "brachytherapy"
    A type of radiation therapy in which radioactive implants, such as pellets, seeds, ribbons, wires, needles, balloons, or capsules, are placed in the body, directly into or near the tumor. The radiation is delivered through a flexible tube called a catheter or a larger device called an applicator. Brachytherapy is often used to treat cancers of the head and neck, breast, cervix, prostate, and eye. Depending on the type of cancer and treatment plan, the implant may be kept in place for a few minutes, many days, or permanently. Also called implant radiation therapy and radiation brachytherapy.
  BRAF (V600E) kinase inhibitor RO5185426: (… KY-nays in-HIH-bih-ter …)
    Pronunciation of dictionary term "BRAF (V600E) kinase inhibitor RO5185426"
    A drug used to treat Erdheim-Chester disease (a very rare type of histiocytosis) and advanced melanoma that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. BRAF (V600E) kinase inhibitor RO5185426 blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called PLX4032, RG7204, vemurafenib, and Zelboraf.
    More Information
    - Vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib)
  BRAF gene: (… jeen)
    Pronunciation of dictionary term "BRAF gene"
    A gene that makes a protein that is involved in sending signals in cells and in cell growth. Mutated (changed) forms of the BRAF gene and protein have been found in many types of cancer. These changes can increase the growth and spread of cancer cells.
  BRAF kinase inhibitor: (… KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "BRAF kinase inhibitor"
    A substance that blocks a protein called BRAF. BRAF is a kinase enzyme that helps control cell growth and signaling. It may be found in a mutated (changed) form in some types of cancer, including melanoma and colorectal cancer. Blocking mutated BRAF kinase proteins may help keep cancer cells from growing. Some BRAF kinase inhibitors are used to treat cancer.
  BRAF V600 mutation: (… myoo-TAY-shun)
    Pronunciation of dictionary term "BRAF V600 mutation"
    A type of mutation (change) in the BRAF gene that causes a mutant form of the BRAF protein to be made. This results in uncontrolled cell division and growth, which can lead to cancer. Drugs that target this mutant BRAF protein may kill cancer cells or stop them from growing. The BRAF V600 mutation is most commonly found in melanoma, but it may also be found in some other types of cancer, including cancers of the colon, rectum, lung, thyroid, ovary, and brain. Checking for the BRAF V600 mutation in tumor tissue may help plan cancer treatment. There are different forms of the BRAF V600 mutation, including V600E and V600K. V600E is the most common form.
  Braftovi: (braf-TOH-vee)
    Pronunciation of dictionary term "Braftovi"
    A drug used with cetuximab to treat certain types of colorectal cancer and with binimetinib to treat certain types of melanoma and non-small cell lung cancer. It is used in patients whose cancer has a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Braftovi blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called encorafenib.
    More Information
    - Encorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/encorafenib)
  brain: (brayn)
    Pronunciation of dictionary term "brain"
    The organ inside the head that controls all body functions of a human being. Made up of billions of nerve cells, the brain is protected by the cranium (the bones that form the head). It is made up of three major parts: the cerebrum, the cerebellum, and the brain stem. The cerebrum is the largest part of the brain and controls thinking, learning, problem solving, emotions, memory, speech, reading, writing, and voluntary movement. The cerebellum controls fine motor movement, balance, and posture. The brain stem controls breathing, heart rate, and the nerves and muscles used to see, hear, walk, talk, and eat. The brain stem connects the brain to the spinal cord. The brain and the spinal cord make up the central nervous system.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
  brain metastasis: (brayn meh-TAS-tuh-sis)
    Pronunciation of dictionary term "brain metastasis"
    Cancer that has spread from the original (primary) tumor to the brain.
  brain stem: (brayn stem)
    Pronunciation of dictionary term "brain stem"
    The part of the brain that is connected to the spinal cord. The brain stem is in the lowest part of the brain (just above the back of the neck) and is made up of the midbrain, pons, and medulla oblongata. It controls many vital functions, such as breathing, heart rate, and blood pressure, and the nerves and muscles used in seeing, hearing, walking, talking, and eating.
    More Information
    - Diffuse Intrinsic Pontine Glioma (DIPG)
    Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.
    Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.
  brain stem auditory evoked response test: (brayn stem AW-duh-TOR-ee eh-VOKT reh-SPONTS …)
    Pronunciation of dictionary term "brainstem auditory evoked response test"
    A test used to detect some types of hearing loss, such as hearing loss caused by injury or tumors that affect nerves involved in hearing. Electrodes are placed on the head and certain tones or clicking sounds are made. The electrodes measure nerve signals in the brain when it reacts to the sounds. Also called ABR test, auditory brain stem response test, and BAER test.
    More Information
    - Langerhans Cell Histiocytosis Treatment
  brain stem glioma: (brayn stem glee-OH-muh)
    Pronunciation of dictionary term "brain stem glioma"
    A tumor that forms from cells called glial cells in the brain stem (the part of the brain that is connected to the spinal cord). Glial cells support and protect the nerve cells in the brain and help them work the way they should. Most brain stem gliomas are diffuse intrinsic pontine gliomas (DIPGs), which are fast-growing tumors that form in a part of the brain stem called the pons. These tumors tend to spread throughout the brain stem and are hard to treat. Brain stem gliomas usually occur in children.
    More Information
    - Diffuse Intrinsic Pontine Glioma (DIPG)
    Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.
    Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.
  brain stem tumor: (brayn stem TOO-mer)
    Pronunciation of dictionary term "brain stem tumor"
    A tumor in the part of the brain that connects to the spinal cord (the brain stem).
    More Information
    - Diffuse Intrinsic Pontine Glioma (DIPG)
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  brain tumor: (brayn TOO-mer)
    Pronunciation of dictionary term "brain tumor"
    The growth of abnormal cells in the tissues of the brain. Brain tumors can be benign (not cancer) or malignant (cancer).
    More Information
    - Brain Tumors (https://www.cancer.gov/types/brain)
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  Brassica vegetable: (BRA-sih-kuh VEJ-tuh-bul)
    Pronunciation of dictionary term "Brassica vegetable"
    A member of the family of vegetables that includes broccoli, Brussels sprouts, cabbage, cauliflower, collard greens, kale, and turnips. These vegetables contain substances that may protect against cancer. Also called cruciferous vegetable.
    More Information
    - Cruciferous Vegetables and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/cruciferous-vegetables-fact-sheet)
  BRCA1 gene: (... jeen)
    Pronunciation of dictionary term "BRCA1 gene"
    A gene that makes a protein that repairs damaged DNA. Mutations (changes) in the BRCA1 gene significantly increase the risk of developing breast and ovarian cancer. These mutations can also increase the risk of developing other types of cancer, such as prostate cancer and pancreatic cancer. The BRCA1 gene is located on chromosome 17, which is 1 of the 23 pairs of chromosomes in human cells.
    More Information
    - BRCA Gene Changes: Cancer Risk and Genetic Testing (https://www.cancer.gov/about-cancer/causes-prevention/genetics/brca-fact-sheet)
    - BRCA1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/brca1/)
  BRCA2 gene: (... jeen)
    Pronunciation of dictionary term "BRCA2 gene"
    A gene that makes a protein that repairs damaged DNA. Mutations (changes) in the BRCA2 gene significantly increase the risk of developing breast and ovarian cancer. These mutations can also increase the risk of developing other types of cancer, such as prostate cancer and pancreatic cancer. The BRCA2 gene is located on chromosome 13, which is 1 of the 23 pairs of chromosomes in human cells.
    More Information
    - BRCA Gene Changes: Cancer Risk and Genetic Testing (https://www.cancer.gov/about-cancer/causes-prevention/genetics/brca-fact-sheet)
    - BRCA2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/brca2/)
  BRCAPro: A computer program that uses statistics to predict whether a person has an inherited mutation (change) in the BRCA1 and BRCA2 genes. People who have certain mutations in these genes have a higher than normal risk of breast, ovarian, prostate, and other types of cancer. The program is based on personal and family medical histories of breast and ovarian cancer.
  breakthrough pain: (BRAYK-throo payn)
    Pronunciation of dictionary term "breakthrough pain"
    A sudden increase in pain that may occur in patients who already have chronic pain from cancer, arthritis, fibromyalgia, or other conditions. Breakthrough pain usually lasts for a short time. During breakthrough pain, the level of pain may be severe but the type of pain and where it is in the body are usually the same as the patient’s chronic pain. Breakthrough pain may occur with stress, illness, and certain activities, such as exercising or coughing, or when the dose of pain medicine that the patient is taking wears off. Breakthrough pain is usually not a symptom of a new condition or a condition that has gotten worse. Also called pain flare.
    More Information
    - Cancer Pain
    - Pain in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
  breast: (brest)
    Pronunciation of dictionary term "breast"
    Glandular organ located on the chest. The breast is made up of connective tissue, fat, and breast tissue that contains the glands that can make milk. Also called mammary gland.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
    Anatomy of the male breast. The nipple and areola are shown on the outside of the breast. The lymph nodes, fatty tissue, ducts, and other parts of the inside of the breast are also shown.
    Anatomy of the male breast; drawing shows the lymph nodes, nipple, areola, chest wall, ribs, muscle, fatty tissue, and ducts.
  breast biopsy clip: (brest BY-op-see klip)
    Pronunciation of dictionary term "breast biopsy clip"
    A tiny, metal object that is placed into the breast during a biopsy to mark the area where the biopsy was done. The clip or marker is left inside the breast so it can be seen on a mammogram or other imaging test performed in the future. The clip does not cause any pain or harm the body. Also called breast biopsy marker.
  breast biopsy marker: (brest BY-op-see MAR-ker)
    Pronunciation of dictionary term "breast biopsy marker"
    A tiny, metal object that is placed into the breast during a biopsy to mark the area where the biopsy was done. The clip or marker is left inside the breast so it can be seen on a mammogram or other imaging test performed in the future. The clip does not cause any pain or harm the body. Also called breast biopsy clip.
  breast cancer: (brest KAN-ser)
    Pronunciation of dictionary term "breast cancer"
    Cancer that forms in tissues of the breast. The most common type of breast cancer is ductal carcinoma, which begins in the lining of the milk ducts (thin tubes that carry milk from the lobules of the breast to the nipple). Another type of breast cancer is lobular carcinoma, which begins in the lobules (milk glands) of the breast. Invasive breast cancer is breast cancer that has spread from where it began in the breast ducts or lobules to surrounding normal tissue. Breast cancer occurs in both men and women, although male breast cancer is rare.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
  breast cancer resistance protein: (brest KAN-ser reh-ZIH-stunts PROH-teen)
    Pronunciation of dictionary term "breast cancer resistance protein"
    A protein that is involved in making cancer cells resistant (unable to respond) to anticancer drugs. Normally, breast cancer resistance protein works with other proteins to help move many different substances, including drugs and other chemicals, in and out of cells. It is found in stem cells and in normal tissues, including the intestine, liver, brain, and placenta. However, it may also be found in higher than normal amounts in some cancer cells, which can cause them to be unable to respond to certain anticancer drugs. Drugs that block breast cancer resistance protein are being studied in the treatment of some types of cancer. Breast cancer resistance protein was first identified in breast cancer cells. Also called BCRP.
  breast carcinoma in situ: (brest KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "breast carcinoma in situ"
    A condition in which abnormal cells are found in the tissues of the breast. There are 2 types of breast carcinoma in situ: ductal carcinoma in situ (DCIS) and Paget disease of the nipple. DCIS is a condition in which the abnormal cells are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Paget disease of the nipple is a condition in which abnormal cells are found in the skin cells of the nipple and may spread to the areola. Patients with Paget disease of the nipple may also have DCIS or invasive breast cancer in the same breast. Also called stage 0 breast carcinoma in situ.
    More Information
    - Breast Cancer Treatment
  breast columnar cell lesion: (brest kuh-LUM-nar sel LEE-zhun)
    Pronunciation of dictionary term "breast columnar cell lesion"
    A common breast biopsy finding in which the cuboidal (square-ish) cells that normally line the lobules (milk glands) of the breast are replaced with one or more layers of column-shaped cells called columnar cells. These columnar cells may look like normal cells or abnormal cells under a microscope. The lobules may also look larger than normal. Breast columnar cell lesions often occur with deposits of calcium in the breast tissue. Breast columnar cell lesions are not cancer but may increase the risk of certain other breast conditions or invasive breast cancer.
  breast cyst: (brest sist)
    Pronunciation of dictionary term "breast cyst"
    A fluid-filled sac that forms in the breast that is sometimes filled with a mix of fluid and solid material. Breast cysts may occur in one or both breasts, and there may be more than one. Most cysts feel like a round or oval lump with a smooth, well-defined border that moves easily under the skin of the breast. But some cysts are too small to be felt. Symptoms may include pain or tenderness in the breast, especially around the time of a menstrual period, or a clear or cloudy fluid discharge from the nipple. Most breast cysts are not cancer and do not increase the risk of breast cancer. They can occur at any age but are most common in premenopausal women and in women taking hormone therapy for menopause.
  breast density: (brest DEN-sih-tee)
    Pronunciation of dictionary term "breast density"
    A term used to describe the amount of dense tissue compared to the amount of fatty tissue in the breast on a mammogram. Dense breast tissue has more fibrous and glandular tissue than fat. There are different levels of breast density, ranging from little or no dense tissue to very dense tissue. The more density, the harder it may be to find tumors or other changes on a mammogram.
    More Information
    - Dense Breasts: Answers to Commonly Asked Questions (https://www.cancer.gov/types/breast/breast-changes/dense-breasts)
  breast duct: (brest dukt)
    Pronunciation of dictionary term "breast duct"
    A thin tube in the breast that carries milk from the breast lobules to the nipple. Also called milk duct.
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
  breast duct ectasia: (brest dukt ek-TAY-zhuh)
    Pronunciation of dictionary term "breast duct ectasia"
    A benign (not cancer) condition in which a milk duct under the nipple widens and thickens. This can cause the milk duct to become blocked and fluid to build up inside it. There are usually no symptoms, but sometimes there may be a thick nipple discharge or redness or tenderness of the nipple and nearby breast tissue. Breast duct ectasia is most common in women who are near menopause or have gone through it. Also called mammary duct ectasia.
  breast duct endoscopy: (brest dukt en-DOS-koh-pee)
    Pronunciation of dictionary term "breast duct endoscopy"
    A method used to examine the lining of the breast ducts to look for abnormal tissue. A very thin, flexible, lighted tube attached to a camera is inserted through the nipple, and threaded into the breast ducts deep in the breast. Tissue and fluid samples may be removed during the procedure.
  breast fibrosis: (brest fy-BROH-sis)
    Pronunciation of dictionary term "breast fibrosis"
    A benign (not cancer) condition in which thickened or fibrous (scar-like) tissue is found in the breast. The areas of fibrosis usually feel firm, rubbery, or hard under the skin. Breast fibrosis may occur along with other changes in the breast, including cysts, breast swelling or discomfort, and nipple discharge. These changes may come and go throughout the menstrual cycle and usually stop after menopause. Breast fibrosis can occur at any age but is most common in younger women. Having breast fibrosis does not increase the risk of breast cancer.
  Breast Imaging Reporting and Data System: (brest IH-muh-jing reh-port-ing ... SIS-tem)
    Pronunciation of dictionary term "Breast Imaging Reporting and Data System"
    A reporting system used to describe the results of a mammogram, breast ultrasound, or breast MRI in a standard way. The Breast Imaging Reporting and Data System ranks the test findings according to one of seven categories, ranging from normal or benign (not cancer) to highly suspicious or malignant (cancer). Each category includes follow-up recommendations to help manage a person’s care. For mammograms, the Breast Imaging Reporting and Data System includes four additional categories that describe the level of breast density seen, ranging from little or no dense tissue to very dense tissue. Also called BI-RADS.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  breast implant: (brest IM-plant)
    Pronunciation of dictionary term "breast implant"
    A silicone gel-filled or saline-filled sac placed under the chest muscle to restore breast shape.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  breast lobe: (brest …)
    Pronunciation of dictionary term "breast lobe"
    A section of the breast that contains the lobules (the glands that make milk).
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
  breast lobule: (brest LAH-byool)
    Pronunciation of dictionary term "breast lobule"
    A small part of a lobe in the breast. A breast lobule is a gland that makes milk.
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
  breast pain: (brest payn)
    Pronunciation of dictionary term "breast pain"
    Pain or discomfort in one or both breasts. The pain can be mild or severe and affect one area of the breast or the whole breast, including under the arm. It may also come from nearby muscles or joints outside the breast. Breast pain in women is most often caused by hormone changes before and during the menstrual cycle. It may also be unrelated to the menstrual cycle, with causes that include pregnancy, breastfeeding, smoking, too much caffeine or fat in the diet, certain medicines, breast surgery, injury to the breast or chest wall, or certain breast conditions. It is rarely caused by breast cancer. Breast pain can occur in both women and men. Also called mastalgia.
  breast reconstruction: (brest REE-kun-STRUK-shun)
    Pronunciation of dictionary term "breast reconstruction"
    Surgery to rebuild the shape of the breast after a mastectomy.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  breast self-exam: (brest self-eg-ZAM)
    Pronunciation of dictionary term "breast self-exam"
    A way a person can check their own breasts by feeling for lumps or other changes. Breast self-exams can help a person learn how their breasts normally look and feel and notice when changes occur. Research has shown that doing breast self-exams does not lower the risk of dying from breast cancer and may lead to extra tests and procedures. Also called BSE.
  breast-conserving surgery: (brest-kun-SER-ving SER-juh-ree)
    Pronunciation of dictionary term "breast-conserving surgery"
    Surgery to remove cancer or other abnormal tissue from the breast and some normal tissue around it, but not the breast itself. Some lymph nodes under the arm may be removed for biopsy. Part of the chest wall lining may also be removed if the cancer is near it. Also called breast-sparing surgery, lumpectomy, partial mastectomy, quadrantectomy, and segmental mastectomy.
    More Information
    - Breast Cancer Treatment
    Lumpectomy. The tumor and some normal tissue around it are removed, but not the breast itself. Some lymph nodes under the arm may also be removed. If the cancer is near the chest wall, part of the chest wall lining may be removed as well.
    Lumpectomy; the drawing on the left shows removal of the tumor and some of the normal tissue around it. The drawing on the right shows removal of some of the lymph nodes under the arm and removal of the tumor and part of the chest wall lining near the tumor. Also shown is fatty tissue in the breast.
  breast-sparing surgery: (brest-SPAYR-ing SER-juh-ree)
    Pronunciation of dictionary term "breast-sparing surgery"
    Surgery to remove cancer or other abnormal tissue from the breast and some normal tissue around it, but not the breast itself. Some lymph nodes under the arm may be removed for biopsy. Part of the chest wall lining may also be removed if the cancer is near it. Also called breast-conserving surgery, lumpectomy, partial mastectomy, quadrantectomy, and segmental mastectomy.
    More Information
    - Breast Cancer Treatment
    Lumpectomy. The tumor and some normal tissue around it are removed, but not the breast itself. Some lymph nodes under the arm may also be removed. If the cancer is near the chest wall, part of the chest wall lining may be removed as well.
    Lumpectomy; the drawing on the left shows removal of the tumor and some of the normal tissue around it. The drawing on the right shows removal of some of the lymph nodes under the arm and removal of the tumor and part of the chest wall lining near the tumor. Also shown is fatty tissue in the breast.
  breastbone: (brest-bone)
    Pronunciation of dictionary term "breastbone"
    The long flat bone that forms the center front of the chest wall. The breastbone is attached to the collarbone and the first seven ribs. Also called sternum.
  breastfeeding: (brest-FEE-ding)
    Pronunciation of dictionary term "breastfeeding"
    The act of feeding breast milk to an infant. Babies can be fed directly from the mother’s breast, or breast milk can be pumped and then fed to the baby from a bottle. Breast milk contains calories, vitamins, minerals, and other important nutrients that help an infant grow and develop. It also contains antibodies, which help protect the infant against some infections. Breastfeeding also helps protect the infant and mother against certain diseases or conditions. Also called nursing.
  brentuximab vedotin: (bren-TUK-sih-mab veh-DOH-tin)
    Pronunciation of dictionary term "brentuximab vedotin"
    A drug used alone or with other drugs to treat adults with certain types of classic Hodgkin lymphoma, cutaneous or systemic anaplastic large cell lymphoma, large B-cell lymphoma, mycosis fungoides, or peripheral T-cell lymphoma, and with other drugs to treat children aged 2 years and older with certain types of classic Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Brentuximab vedotin contains a monoclonal antibody that binds to a protein called CD30, which is found on some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. Brentuximab vedotin is a type of antibody-drug conjugate. Also called Adcetris and SGN-35.
    More Information
    - Brentuximab Vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/brentuximabvedotin)
  Breslow depth: (BRES-loh …)
    Pronunciation of dictionary term "Breslow depth"
    A measure of how deeply a melanoma tumor has grown into the skin. The tumor thickness (depth) is usually measured from the top of the tumor to the deepest tumor cells. If the tumor is ulcerated (the skin is broken), it is measured from the base of the ulcer to the deepest tumor cells. Breslow depth is used to help determine the stage of cancer. Thicker tumors are linked with lower survival rates. Also called Breslow thickness.
  Breslow thickness: (BRES-loh THIK-nes)
    Pronunciation of dictionary term "Breslow thickness"
    A measure of how deeply a melanoma tumor has grown into the skin. The tumor thickness (depth) is usually measured from the top of the tumor to the deepest tumor cells. If the tumor is ulcerated (the skin is broken), it is measured from the base of the ulcer to the deepest tumor cells. Breslow thickness is used to help determine the stage of cancer. Thicker tumors are linked with lower survival rates. Also called Breslow depth.
  brexucabtagene autoleucel: (brek-suh-KAB-tuh-jeen AW-toh-LOO-sel)
    Pronunciation of dictionary term "brexucabtagene autoleucel"
    A drug used to treat adults with mantle cell lymphoma or B-cell acute lymphoblastic leukemia that came back or did not get better after other treatment. It is also being studied in the treatment of other types of cancer. Brexucabtagene autoleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Brexucabtagene autoleucel binds to a protein called CD19, which is found on some lymphoma cells and leukemia cells. This helps the body’s immune system kill cancer cells. Brexucabtagene autoleucel is a type of CAR T-cell therapy. Also called Tecartus.
    More Information
    - Brexucabtagene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/brexucabtageneautoleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  Breyanzi: (brey-AN-zee)
    Pronunciation of dictionary term "Breyanzi"
    A treatment used for adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, follicular lymphoma, mantle cell lymphoma, or certain types of large B-cell lymphoma that relapsed (came back) or did not get better after treatment with at least one or two lines of systemic therapy. It is also being studied in the treatment of other types of cancer. Breyanzi is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Breyanzi binds to a protein called CD19, which is found on most B-cell lymphoma cells. This helps the body’s immune system kill cancer cells. Breyanzi is a type of cellular immunotherapy called CAR T-cell therapy. Also called lisocabtagene maraleucel.
    More Information
    - Lisocabtagene Maraleucel (https://www.cancer.gov/about-cancer/treatment/drugs/lisocabtagenemaraleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  Brief Pain Inventory: (breef payn IN-ven-TOR-ee)
    Pronunciation of dictionary term "Brief Pain Inventory"
    A questionnaire used to measure pain.
  brigatinib: (brih-GA-tih-nib)
    Pronunciation of dictionary term "brigatinib"
    A drug used to treat adults with non-small cell lung cancer that has spread and is ALK positive. It is also being studied in the treatment of other types of cancer. Brigatinib blocks certain proteins made by the ALK gene. Blocking these proteins may stop the growth and spread of cancer cells. Brigatinib is a type of tyrosine kinase inhibitor. Also called Alunbrig.
    More Information
    - Brigatinib (https://www.cancer.gov/about-cancer/treatment/drugs/brigatinib)
  brivanib: (brih-VAN-ib)
    Pronunciation of dictionary term "brivanib"
    A substance being studied in the treatment of cancer. Brivanib may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of vascular endothelial growth factor receptor 2 inhibitor and a type of antiangiogenesis agent.
  brivanib alaninate: (brih-VAN-ib a-luh-NIH-nayt)
    Pronunciation of dictionary term "brivanib alaninate"
    A substance being studied in the treatment of cancer. Brivanib alaninate may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of vascular endothelial growth factor receptor 2 inhibitor and a type of antiangiogenesis agent.
  brivudine: (BRIH-vyoo-deen)
    Pronunciation of dictionary term "brivudine"
    A substance that is being studied in the treatment of infections caused by herpesvirus, including herpes-zoster (shingles). It belongs to the family of drugs called antivirals.
  BRM therapy: (...THAYR-uh-pee)
    Pronunciation of dictionary term "BRM therapy"
    A type of treatment that uses substances made from living organisms to treat disease. These substances may occur naturally in the body or may be made in the laboratory. In cancer, some BRM therapies stimulate or suppress the immune system to help the body fight cancer. Other BRM therapies attack specific cancer cells, which may help keep them from growing or kill them. They may also lessen certain side effects caused by some cancer treatments. Types of BRM therapy include immunotherapy (such as cytokines, cancer treatment vaccines, and some antibodies) and some targeted therapies. Also called biological response modifier therapy, biological therapy, and biotherapy.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
  broad ligament: (brod LIH-guh-ment)
    Pronunciation of dictionary term "broad ligament"
    The layer of tissue that connects the sides of the uterus to the walls and floor of the pelvis. The broad ligament covers the uterus, ovaries, and fallopian tubes. It also includes nerves and blood vessels to these organs.
  broccoli sprout extract: (BRAH-kuh-lee … EK-strakt)
    Pronunciation of dictionary term "broccoli sprout extract"
    A substance being studied in the prevention of cancer. Broccoli sprout extract comes from newly sprouted broccoli. It causes cells to make enzymes that may protect them against cancer-causing toxins in the body, and it may also block the growth of cancer cells.
  bromelain: (BROH-meh-layn)
    Pronunciation of dictionary term "bromelain"
    An enzyme found in pineapples that breaks down other proteins, such as collagen and muscle fiber, and has anti-inflammatory properties. It is used as a meat tenderizer in the food industry.
  bronchi: (BRONG-ky)
    Pronunciation of dictionary term "bronchi"
    The large air passages that lead from the trachea (windpipe) to the lungs.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  bronchial: (BRON-kee-ul)
    Pronunciation of dictionary term "bronchial"
    Having to do with the bronchi, which are the larger air passages of the lungs, including those that lead from the trachea (windpipe) to the lungs and those within the lungs.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  bronchial adenoma: (BRON-kee-ul A-deh-NOH-muh)
    Pronunciation of dictionary term "bronchial adenoma"
    Cancer that forms in tissues of the bronchi (large air passages in the lungs including those that lead to the lungs from the windpipe).
  bronchial brush biopsy: (BRON-kee-ul brush BY-op-see)
    Pronunciation of dictionary term "bronchial brush biopsy"
    A procedure in which cells are taken from the inside of the airways that lead to the lungs. A bronchoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted through the nose or mouth into the lungs. A small brush is then used to remove cells from the airways. These cells are then looked at under a microscope. A bronchial brush biopsy is used to find cancer and changes in cells that may lead to cancer. It is also used to help diagnose other lung conditions. Also called bronchial brushing.
  bronchial brushing: (BRON-kee-ul BRUH-shing)
    Pronunciation of dictionary term "bronchial brushing"
    A procedure in which cells are taken from the inside of the airways that lead to the lungs. A bronchoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted through the nose or mouth into the lungs. A small brush is then used to remove cells from the airways. These cells are then looked at under a microscope. A bronchial brushing is used to find cancer and changes in cells that may lead to cancer. It is also used to help diagnose other lung conditions. Also called bronchial brush biopsy.
  bronchial washing: (BRON-kee-ul WAH-shing)
    Pronunciation of dictionary term "bronchial washing"
    A procedure in which cells are taken from the inside of the airways that lead to the lungs. A bronchoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted through the nose or mouth into the lungs. A mild salt solution is washed over the surface of the airways to collect cells, which are then looked at under a microscope. Bronchial washing is used to find infections. It may also help find cancer or changes in cells that may lead to cancer.
  bronchiole: (BRONG-kee-ole)
    Pronunciation of dictionary term "bronchiole"
    A tiny branch of air tubes in the lungs.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  bronchiolitis obliterans: (BRONG-kee-oh-LY-tis ob-LIH-teh-ranz)
    Pronunciation of dictionary term "bronchiolitis obliterans"
    A condition in which the bronchioles (tiny branches of air tubes in the lungs) become inflamed and blocked. It may be caused by breathing in gases or particles that irritate the bronchioles. This irritation causes scar tissue to form, and makes breathing difficult. Bronchiolitis olbiterans may be caused by other factors, and can also occur after a transplant with an organ or stem cells from a matched donor.
  bronchitis: (bron-KY-tis)
    Pronunciation of dictionary term "bronchitis"
    Inflammation (swelling and reddening) of the bronchi.
  bronchodilator: (BRON-koh-DY-lay-ter)
    Pronunciation of dictionary term "bronchodilator"
    A type of drug that causes small airways in the lungs to open up. Bronchodilators are inhaled and are used to treat breathing disorders, such as asthma or emphysema.
  bronchogenic carcinoma: (BRON-koh-JEH-nik KAR-sih-NOH-muh)
    Pronunciation of dictionary term "bronchogenic carcinoma"
    Cancer that begins in the tissue that lines or covers the airways of the lungs, including small cell and non-small cell lung cancer.
  bronchoscope: (BRON-koh-SKOPE)
    Pronunciation of dictionary term "bronchoscope"
    A thin, tube-like instrument used to examine the inside of the trachea, bronchi (air passages that lead to the lungs), and lungs. A bronchoscope has a light and a lens for viewing, and may have a tool to remove tissue.
  bronchoscopy: (bron-KOS-koh-pee)
    Pronunciation of dictionary term "bronchoscopy"
    A procedure that uses a bronchoscope to examine the inside of the trachea, bronchi (air passages that lead to the lungs), and lungs. A bronchoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. The bronchoscope is inserted through the nose or mouth. Bronchoscopy may be used to detect cancer or to perform some treatment procedures.
    Bronchoscopy. A bronchoscope is inserted through the mouth, trachea, and major bronchi into the lung, to look for abnormal areas. A bronchoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a cutting tool. Tissue samples may be taken to be checked under a microscope for signs of disease.
    Bronchoscopy; drawing shows a bronchoscope inserted through the mouth, trachea, and bronchus into the lung; lymph nodes along trachea and bronchi; and cancer in one lung. Inset shows patient lying on a table having a bronchoscopy.
  bronchus: (BRON-kus)
    Pronunciation of dictionary term "bronchus"
    A large airway that leads from the trachea (windpipe) to a lung. The plural of bronchus is bronchi.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  Brooke-Spiegler syndrome: (brook-SPEEG-ler SIN-drome)
    Pronunciation of dictionary term "Brooke-Spiegler syndrome"
    A rare, inherited disorder in which tumors form in the hair follicles and sweat glands in the skin. The tumors usually occur on the head and neck, but they can also occur in the salivary glands and in other parts of the body. They tend to be large and increase in number over time and can affect vision, hearing, sense of smell, and the ability to chew and swallow. The tumors usually appear in late childhood or early adolescence. They are usually benign (not cancer) but may become cancer. People with this disorder have an increased risk of developing basal cell skin cancer and salivary gland tumors. Brooke-Spiegler syndrome is caused by a mutation (change) in the CYLD gene. Also called BSS.
  brostallicin hydrochloride: (brah-STAH-lih-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "brostallicin hydrochloride"
    A substance being studied in the treatment of cancer. Brostallicin hydrochloride binds to DNA and may kill cancer cells. It may also help other drugs kill cancer cells. It is a type of DNA minor groove binding agent.
  broxuridine: (brox-YOOR-ih-deen)
    Pronunciation of dictionary term "broxuridine"
    A drug that makes cancer cells more sensitive to radiation and is also used as a diagnostic agent to determine how fast cancer cells grow.
  Brukinsa: (BROO-kin-suh)
    Pronunciation of dictionary term "Brukinsa"
    A drug used alone or with another drug to treat adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, or certain types of non-Hodgkin lymphoma, including follicular lymphoma, mantle cell lymphoma, marginal zone lymphoma, and Waldenström’s macroglobulinemia. It is also being studied in the treatment of other types of cancer. Brukinsa blocks a protein called BTK, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called zanubrutinib.
    More Information
    - Zanubrutinib (https://www.cancer.gov/about-cancer/treatment/drugs/zanubrutinib)
  bryostatin 1: (BRY-uh-STA-tin)
    Pronunciation of dictionary term "bryostatin 1"
    A substance being studied in the treatment of cancer and certain brain conditions such as Alzheimer disease and stroke. It binds to an enzyme involved in cell growth and it may help anticancer drugs work better. Bryostatin 1 comes from a marine organism. It is a type of protein kinase C modulator.
  BSE: A way a person can check their own breasts by feeling for lumps or other changes. BSEs can help a person learn how their breasts normally look and feel and notice when changes occur. Research has shown that doing BSEs does not lower the risk of dying from breast cancer and may lead to extra tests and procedures. Also called breast self-exam.
  BSH: A substance used in a type of radiation therapy called boron neutron capture therapy. BSH is injected into a vein and becomes concentrated in tumor cells. The patient then receives radiation treatment with atomic particles called neutrons. The neutrons react with the boron in BSH and make radioactive particles that kill the tumor cells without harming normal cells. Also called sodium borocaptate.
  BSI-201: A substance being studied in the treatment of some types of cancer. BSI-201 may kill cancer cells. Also called iniparib.
  BSS: A rare, inherited disorder in which tumors form in the hair follicles and sweat glands in the skin. The tumors usually occur on the head and neck, but they can also occur in the salivary glands and in other parts of the body. They tend to be large and increase in number over time and can affect vision, hearing, sense of smell, and the ability to chew and swallow. The tumors usually appear in late childhood or early adolescence. They are usually benign (not cancer) but may become cancer. People with this disorder have an increased risk of developing basal cell skin cancer and salivary gland tumors. BSS is caused by a mutation (change) in the CYLD gene. Also called Brooke-Spiegler syndrome.
  BTK inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "BTK inhibitor"
    A substance that blocks the activity of a protein called Bruton tyrosine kinase (BTK), which plays an important role in the development and maturation of B cells. B cells are a type of white blood cell that makes special proteins called antibodies. BTK inhibitors bind to the BTK protein, which is found on most B cells and some types of cancer cells. Blocking BTK may help keep cancer cells from growing. Some BTK inhibitors are used to treat cancer.
  buccal mucosa: (BUH-kul myoo-KOH-suh)
    Pronunciation of dictionary term "buccal mucosa"
    The inner lining of the cheeks.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  bucket trial: (BUH-ket TRY-ul)
    Pronunciation of dictionary term "bucket trial"
    A type of clinical trial that tests how well a new drug or other substance works in patients who have different types of cancer that all have the same mutation or biomarker. In bucket trials, patients all receive the same treatment that targets the specific mutation or biomarker found in their cancer. Bucket trials may allow new drugs to be tested and approved more quickly than traditional clinical trials. Bucket trials may also be useful for studying rare cancers and cancers with rare genetic changes. Also called basket trial.
  budesonide: (byoo-DEH-suh-nide)
    Pronunciation of dictionary term "budesonide"
    A drug used in the treatment of asthma and rhinitis. It is also being studied in the treatment of cancer. Budesonide belongs to the family of drugs called steroids.
  bugbane: (BUG-bayn)
    Pronunciation of dictionary term "bugbane"
    An eastern North American perennial herb. A substance obtained from the root of the plant has been used in some cultures to treat a number of medical problems. It is being studied in the treatment of hot flashes and other symptoms of menopause. The scientific name is Cimicifuga racemosa. Also called black cohosh, black snakeroot, bugwort, and rattlesnake root.
    More Information
    - Black Cohosh
  bugwort: (BUG-wort)
    Pronunciation of dictionary term "bugwort"
    An eastern North American perennial herb. A substance obtained from the root of the plant has been used in some cultures to treat a number of medical problems. It is being studied in the treatment of hot flashes and other symptoms of menopause. The scientific name is Cimicifuga racemosa. Also called black cohosh, black snakeroot, bugbane, and rattlesnake root.
    More Information
    - Black Cohosh
  bulbar conjunctivitis: (BUL-bar kun-JUNK-tih-VY-tis)
    Pronunciation of dictionary term "bulbar conjunctivitis"
    A condition in which the thin layer of tissue that covers the sclera (the white part of the eye) becomes inflamed. The cause is usually not known, but it may occur with certain inflammatory conditions, such as lupus and rheumatoid arthritis. Signs and symptoms include redness, swelling, tenderness, mild pain in the eye, and sensitivity to light. Bulbar conjunctivitis usually does not affect vision and often goes away without treatment. Also called episcleritis.
  bulk-forming agent: (...FOR-ming AY-jent)
    Pronunciation of dictionary term "bulk-forming agent"
    A substance, such as fiber in food, that adds bulk and water to stools so that they can pass more easily through the intestines (lower part of the digestive tract).
  BuMel: An abbreviation for a chemotherapy combination used to prepare patients with high-risk neuroblastoma for a stem cell transplant. It is also being studied in the treatment of other types of cancer. BuMel includes the drugs busulfan and melphalan hydrochloride. Also called BuMel regimen.
    More Information
    - BuMel (https://www.cancer.gov/about-cancer/treatment/drugs/BuMel)
  BuMel regimen: (… REH-jih-men)
    Pronunciation of dictionary term "BuMel regimen"
    An abbreviation for a chemotherapy combination used to prepare patients with high-risk neuroblastoma for a stem cell transplant. It is also being studied in the treatment of other types of cancer. BuMel regimen includes the drugs busulfan and melphalan hydrochloride. Also called BuMel.
    More Information
    - BuMel (https://www.cancer.gov/about-cancer/treatment/drugs/BuMel)
  BUN: Nitrogen in the blood that comes from urea (a substance formed by the breakdown of protein in the liver). The kidneys filter urea out of the blood and into the urine. A high level of urea nitrogen in the blood may be a sign of a kidney problem. Also called blood urea nitrogen and urea nitrogen.
  bupivacaine: (byoo-PIH-vuh-kane)
    Pronunciation of dictionary term "bupivacaine"
    A drug used to relieve pain by blocking signals at nerve endings. It is being studied in the relief of pain following surgery for cancer. It is a type of local anesthetic. Also called bupivacaine hydrochloride, Marcaine, and Sensorcaine.
  bupivacaine hydrochloride: (byoo-PIH-vuh-kane HY-droh-KLOR-ide)
    Pronunciation of dictionary term "bupivacaine hydrochloride"
    A drug used to relieve pain by blocking signals at nerve endings. It is being studied in the relief of pain following surgery for cancer. It is a type of local anesthetic. Also called Marcaine and Sensorcaine.
  buprenorphine hydrochloride: (BYOO-preh-NOR-feen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "buprenorphine hydrochloride"
    A drug used to treat moderate to severe pain. It also reduces cravings and withdrawal symptoms in people with opioid use disorder. Buprenorphine hydrochloride works by binding to certain opioid receptors in the central nervous system. This blocks pain signals and changes how the body responds to pain. Buprenorphine hydrochloride is a type of synthetic opioid agonist that works as an analgesic (pain reliever).
    More Information
    - Cancer Pain
  bupropion hydrochloride: (byoo-PROH-pee-on HY-droh-KLOR-ide)
    Pronunciation of dictionary term "bupropion hydrochloride"
    A drug used to treat depression and certain other disorders. It is also used to help people stop smoking. Bupropion hydrochloride increases the levels of the chemicals dopamine, serotonin, and norepinephrine in the brain. This helps improve mood and can lessen cravings for nicotine. It is a type of antidepressant and a type of nicotine receptor antagonist. Also called Wellbutrin and Zyban.
  burdock: (BUR-dok)
    Pronunciation of dictionary term "burdock"
    A plant whose seeds and root have been used in some cultures to treat certain medical problems. It may have antioxidant effects. The scientific name is Arctium lappa. Also called happy major and lappa.
  Burkitt leukemia: (BER-kit loo-KEE-mee-uh)
    Pronunciation of dictionary term "Burkitt leukemia"
    A rare, fast-growing type of leukemia (blood cancer) in which too many white blood cells called B lymphocytes form in the blood and bone marrow. It may start in the lymph nodes as Burkitt lymphoma and then spread to the blood and bone marrow, or it may start in the blood and bone marrow without involvement of the lymph nodes. Both Burkitt leukemia and Burkitt lymphoma have been linked to infection with the Epstein-Barr virus.
  Burkitt lymphoma: (BER-kit lim-FOH-muh)
    Pronunciation of dictionary term "Burkitt lymphoma"
    An aggressive (fast-growing) type of B-cell non-Hodgkin lymphoma that occurs most often in children and young adults. The disease may affect the jaw, central nervous system, bowel, kidneys, ovaries, or other organs. There are three main types of Burkitt lymphoma (sporadic, endemic, and immunodeficiency related). Sporadic Burkitt lymphoma occurs throughout the world, and endemic Burkitt lymphoma occurs in Africa. Immunodeficiency-related Burkitt lymphoma is most often seen in AIDS patients.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  burping: (BUR-ping)
    Pronunciation of dictionary term "burping"
    The release of air or gas from the stomach or esophagus through the mouth. Burping is usually caused by a buildup of air in the esophagus or upper part of the stomach when too much air is swallowed. This can occur when eating or drinking too fast, talking while eating, drinking carbonated drinks, chewing gum, smoking, or having an anxiety attack. Burping may also be a side effect of certain medicines or a symptom of some gastrointestinal conditions and digestive problems, such as gastroesophageal reflux disease, gastritis, and stomach ulcers or infections. Also called belching and eructation.
  burr hole: (bur hole)
    Pronunciation of dictionary term "burr hole"
    A small opening in the skull made with a surgical drill.
  bursitis: (ber-SY-tis)
    Pronunciation of dictionary term "bursitis"
    Inflammation (swelling, pain, and warmth) of a bursa. A bursa is a flat, fluid-filled sac found between a bone and a tendon or muscle. It forms a cushion to help the tendon or muscle slide smoothly over the bone. Bursitis may be caused by long-term overuse, trauma, rheumatoid arthritis, gout, or infection. It usually affects the shoulder, knee, elbow, hip, or foot.
  buserelin: (BYOO-seh-REH-lin)
    Pronunciation of dictionary term "buserelin"
    An anticancer drug that belongs to the family of drugs called gonadotropin-releasing hormones. In prostate cancer therapy, buserelin blocks the production of testosterone in the testicles.
  buspirone: (byoo-SPY-rone)
    Pronunciation of dictionary term "buspirone"
    A drug that is used to treat certain anxiety disorders. It belongs to the family of drugs called antianxiety agents.
  busulfan: (byoo-SUL-fan)
    Pronunciation of dictionary term "busulfan"
    A drug used under the brand name Myleran to treat chronic myelogenous leukemia (CML) and with other drugs under the brand name Busulfex to prepare patients with CML for a donor stem cell transplant. It is also being studied in the treatment of other types of cancer. Busulfan damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent.
    More Information
    - Busulfan (https://www.cancer.gov/about-cancer/treatment/drugs/busulfan)
  Busulfex: (byoo-SUL-fex)
    Pronunciation of dictionary term "Busulfex"
    A drug that contains the active ingredient busulfan and is used with other drugs to prepare patients with chronic myelogenous leukemia for a donor stem cell transplant. It is also being studied in the treatment of other types of cancer. Busulfex damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent.
  butane: (BYOO-tayn)
    Pronunciation of dictionary term "butane"
    A colorless gas that catches fire easily and is used as fuel. It is found in gasoline, lighter fluid, and some aerosol sprays. Butane is also one of many harmful chemicals found in tobacco smoke.
  buthionine sulfoximine: (byoo-THY-oh-neen sul-FOK-sih-meen)
    Pronunciation of dictionary term "buthionine sulfoximine"
    A drug that may help prevent resistance to some anticancer drugs.
  buttock: (BUH-tuk)
    Pronunciation of dictionary term "buttock"
    One of two round, fleshy mounds of tissue behind the pelvis. The buttocks are made up of fat and thick muscle tissue that help support the body while sitting. The muscles in the buttocks are also used to move the hips and thighs.
  bypass: (BY-pas)
    Pronunciation of dictionary term "bypass"
    A surgical procedure in which the doctor creates a new pathway for the flow of body fluids.
  C cell: (… sel)
    Pronunciation of dictionary term "C cell"
    A type of cell in the thyroid. C cells make calcitonin, a hormone that helps control the calcium level in the blood.
  c-ABL: An enzyme that is involved in many cell processes, such as cell division. The gene for c-ABL is on chromosome 9. In most people with chronic myelogenous leukemia, the part of chromosome 9 with c-ABL has broken off and traded places with part of chromosome 22 to form the BCR::ABL1 fusion gene.
  c-erbB-2: A protein involved in normal cell growth. C-erbB-2 may be made in larger than normal amounts by some types of cancer cells, including breast, ovarian, bladder, pancreatic, stomach, and esophageal cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. Checking the amount of c-erbB-2 on some types of cancer cells may help plan treatment. Also called HER2, HER2/neu, human EGF receptor 2, and human epidermal growth factor receptor 2.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  c-erbB-2 positive: (… PAH-zih-tiv)
    Pronunciation of dictionary term "c-erbB-2 positive"
    Describes cells that have a protein called HER2 on their surface. In normal cells, HER2 helps control cell growth. Cancer cells that make too much HER2 may grow more quickly and are more likely to spread to other parts of the body. Checking to see if a cancer is c-erbB-2 positive may help plan treatment, which may include drugs that kill c-erbB-2-positive cancer cells. Cancers that may be c-erbB-2 positive include breast, bladder, pancreatic, ovarian, and stomach cancers. Also called HER2 positive and human epidermal growth factor receptor 2 positive.
  c-fos antisense oligonucleotide: (… AN-tee-sents AH-lih-goh-NOO-klee-oh-tide)
    Pronunciation of dictionary term "c-fos antisense oligonucleotide"
    A substance that has been studied in the treatment of cancer and is being studied in the treatment of rheumatoid arthritis and certain skin conditions. It blocks the production of a protein called c-fos, which helps control cell growth. This may kill cancer cells that need c-fos to grow. It is a type of antisense oligonucleotide. Also called antisense c-fos.
  c-kit: A protein found on the surface of many different types of cells. It binds to a substance called stem cell factor (SCF), which causes certain types of blood cells to grow. C-kit may also be found in higher than normal amounts, or in a changed form, on some types of cancer cells, including gastrointestinal stromal tumors and melanoma. Measuring the amount of c-kit in tumor tissue may help diagnose cancer and plan treatment. C-kit is a type of receptor tyrosine kinase and a type of tumor marker. Also called CD117 and stem cell factor receptor.
  C-peptide: (… PEP-tide)
    Pronunciation of dictionary term "C-peptide"
    A substance made by the pancreas. C-peptide and insulin are both part of a larger molecule that gets split apart before being released into the blood. Abnormal blood levels of C-peptide may occur in certain diseases, such as diabetes or cancer. Also called connecting peptide.
  C-peptide suppression test: (… PEP-tide suh-PREH-shun …)
    Pronunciation of dictionary term "C-peptide suppression test"
    A test used to help diagnose a type of pancreatic tumor called an insulinoma. After fasting, the patient receives an injection of insulin and the level of C-peptide (a substance released with insulin by the pancreas) in the blood is measured. In patients who have an insulinoma, the level of C-peptide is higher than normal.
  C-reactive protein: (… ree-AK-tive PROH-teen)
    Pronunciation of dictionary term "C-reactive protein"
    A protein that is made by the liver when there is inflammation or tissue damage in the body. C-reactive protein levels are usually low or not detectable in the blood of healthy people. A high level of C-reactive protein in the blood may be a sign of certain conditions, including cancer, infection, inflammatory bowel disease, rheumatoid arthritis, and lupus. Increased levels of C-reactive protein may also signal a high risk of heart attack or stroke. Measuring the level of C-reactive protein may be done to help diagnose certain diseases, find out how well treatment is working, or determine a person’s risk of developing heart disease. Also called CRP.
  C-section: (… SEK-shun)
    Pronunciation of dictionary term "C-section"
    The delivery of a baby through an incision (cut) made in a person’s abdomen and uterus. After the baby is delivered, the umbilical cord is clamped and cut, the placenta is removed, and the cuts in the uterus and abdomen are closed with stitches. A C-section may be done if there are problems during labor or if the baby is in distress, is too big, or is in an abnormal position in the uterus. It may also be done if there is more than one baby being delivered, if there are problems with the placenta, or if the person has an infection or other health problem that would prevent having a vaginal delivery. Also called cesarean delivery and cesarean section.
  CA 15-3: A protein found on epithelial cells that is part of a larger protein called MUC 1. CA 15-3 may be found in higher than normal amounts in patients with some types of cancer, including breast cancer. Measuring the amount of CA 15-3 in the blood may be useful in checking how well cancer treatment is working or if cancer has come back. CA 15-3 is a type of tumor marker.
  CA 19-9: A substance released into the bloodstream by both cancer cells and normal cells. Too much CA 19-9 in the blood can be a sign of pancreatic cancer or other types of cancer or conditions. The amount of CA 19-9 in the blood can be used to help keep track of how well cancer treatments are working or if cancer has come back. It is a type of tumor marker.
  CA 19-9 assay: (... A-say)
    Pronunciation of dictionary term "CA 19-9 assay"
    A laboratory test that measures the level of CA 19-9 in the blood. CA 19-9 is a substance released into the blood by both cancer cells and normal cells. Higher than normal amounts of CA 19-9 in the blood can be a sign of pancreatic or other types of cancer or other conditions. The amount of CA 19-9 in the blood can be used to help keep track of how well cancer treatments are working or if cancer has come back. CA 19-9 is a type of tumor marker.
  CA 27.29: A protein found on epithelial cells, which line the inside and outside surfaces of the body. It is part of a larger protein called MUC 1. CA 27.29 may be found in higher than normal amounts in patients with some types of cancer, including breast cancer. Measuring the amount of CA 27.29 in the blood may help to find out how well cancer treatment is working or if cancer has come back. CA 27.29 is a type of tumor marker.
  CA-125: A substance that may be found in high amounts in the blood of patients with certain types of cancer, including ovarian cancer. CA-125 levels may also help monitor how well cancer treatments are working or if cancer has come back. Also called cancer antigen 125.
  CAB: In medicine, a group of non-scientist volunteers that serves as a link between a community and clinical trial researchers. A CAB may review and monitor clinical trials and help teach the community about the trials. Also called Community Advisory Board.
  cabazitaxel: (kuh-BA-zih-TAK-sil)
    Pronunciation of dictionary term "cabazitaxel"
    A drug used with prednisone to treat prostate cancer that has spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). It is used in patients who have already been treated with anticancer drugs that included docetaxel. It is also being studied in the treatment of other types of cancer. Cabazitaxel stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called Jevtana and taxoid XRP6258.
    More Information
    - Cabazitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/cabazitaxel)
  CABG: Surgery in which a healthy blood vessel taken from another part of the body is used to make a new path for blood around a blocked artery leading to the heart. This restores the flow of oxygen and nutrients to the heart. Also called aortocoronary bypass and coronary artery bypass grafting.
  Cablivi: (cab-LIH-vee)
    Pronunciation of dictionary term "Cablivi"
    A drug used with plasma exchange and immunosuppressive therapy to treat acquired thrombotic thrombocytopenic purpura (aTTP). aTTP is a rare blood disorder in which blood clots form in small blood vessels throughout the body. Cablivi binds to a protein called VWF, which may help keep blood clots from forming. It is a type of nanobody (a tiny antibody). Also called caplacizumab.
    More Information
    - Caplacizumab-yhdp (https://www.cancer.gov/about-cancer/treatment/drugs/caplacizumab-yhdp)
  Cabometyx: (KA-boh-MEH-tix)
    Pronunciation of dictionary term "Cabometyx"
    A drug that contains the active ingredient cabozantinib-s-malate and is used alone or with other drugs to treat certain types of hepatocellular carcinoma (a type of liver cancer), renal cell carcinoma (a type of kidney cancer), and differentiated thyroid cancer. It is also being studied in the treatment of other types of cancer. Cabometyx blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Cabometyx is a type of tyrosine kinase inhibitor and a type of angiogenesis inhibitor.
    More Information
    - Cabozantinib-S-Malate (https://www.cancer.gov/about-cancer/treatment/drugs/cabozantinib-s-malate)
  cabozantinib-s-malate: (KA-boh-ZAN-tih-nib ... MA-layt)
    Pronunciation of dictionary term "cabozantinib-s-malate"
    A drug used alone or with other drugs under the brand name Cabometyx to treat certain types of differentiated thyroid cancer, hepatocellular carcinoma (a type of liver cancer), neuroendocrine tumors, and renal cell carcinoma (a type of kidney cancer). It is used under the brand name Cometriq to treat certain types of medullary thyroid cancer. Cabozantinib-s-malate is also being studied in the treatment of other types of cancer. It blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Cabozantinib-s-malate is a type of tyrosine kinase inhibitor and a type of angiogenesis inhibitor.
    More Information
    - Cabozantinib-S-Malate (https://www.cancer.gov/about-cancer/treatment/drugs/cabozantinib-s-malate)
  cachexia: (kuh-KEK-see-uh)
    Pronunciation of dictionary term "cachexia"
    A condition marked by a loss of more than 10% of body weight, including loss of muscle mass and fat, in a person who is not trying to lose weight. Some people with cachexia may also have diarrhea or weakness and fever that have lasted at least 30 days. Cachexia is a sign of malnutrition and can happen when there are changes in the way the body uses nutrients from food. This may be caused by certain factors, such as inflammation and increased metabolism. Cachexia is most common in people with advanced cancer or other chronic diseases, such as AIDS, chronic obstructive pulmonary disease, and congestive heart failure. Cachexia is hard to reverse once it starts and usually happens at the end of life. Also called wasting syndrome.
    More Information
    - Cancer Cachexia (https://www.cancer.gov/about-cancer/treatment/side-effects/cancer-cachexia)
  CAD: A disease in which there is a narrowing or blockage of the coronary arteries (blood vessels that carry blood and oxygen to the heart). CAD is usually caused by atherosclerosis (a buildup of fatty material and plaque inside the coronary arteries). The disease may cause chest pain, shortness of breath during exercise, and heart attacks. The risk of CAD is increased by having a family history of CAD before age 50, older age, smoking tobacco, high blood pressure, high cholesterol, diabetes, lack of exercise, and obesity. Also called coronary artery disease and coronary heart disease.
  CAD system: (... SIS-tem)
    Pronunciation of dictionary term "CAD system"
    A computer-based system that uses special software to help look for suspicious areas of tissue on an x-ray image. A CAD system highlights these areas on the image so they can be looked at more closely. A CAD system is used with certain types of imaging, such as mammography or chest x-ray, to help diagnose a disease, such as cancer. Also called computer-aided detection system.
  cadmium: (KAD-mee-um)
    Pronunciation of dictionary term "cadmium"
    A metallic element that occurs naturally in tiny amounts in air, water, soil, and food. It is a byproduct of zinc refining and is used to make batteries, pigments, plastics, alloys, and electroplate. It is also found in tobacco and tobacco smoke. Exposure to high levels of cadmium may cause certain cancers and other health problems.
    More Information
    - Cadmium (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/cadmium)
  CAF: An abbreviation for a chemotherapy combination used alone or together with other therapies to treat breast cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs cyclophosphamide, doxorubicin hydrochloride (Adriamycin), and fluorouracil. Also called CAF regimen.
    More Information
    - CAF (https://www.cancer.gov/about-cancer/treatment/drugs/CAF)
  CAF regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CAF regimen"
    An abbreviation for a chemotherapy combination used alone or together with other therapies to treat breast cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs cyclophosphamide, doxorubicin hydrochloride (Adriamycin), and fluorouracil. Also called CAF.
    More Information
    - CAF (https://www.cancer.gov/about-cancer/treatment/drugs/CAF)
  caffeine: (ka-FEEN)
    Pronunciation of dictionary term "caffeine"
    A substance found in the leaves and beans of the coffee tree, in tea, yerba mate, guarana berries, and in small amounts in cocoa. It can also be made in the laboratory, and is added to some soft drinks, foods, and medicines. Caffeine increases brain activity, alertness, attention, and energy. It may also increase blood pressure, heart rate, breathing rate, and the loss of water from the body in urine.
  calaspargase pegol: (kal-AS-par-jays PEH-gol)
    Pronunciation of dictionary term "calaspargase pegol"
    A drug used with other drugs to treat acute lymphoblastic leukemia in children and young adults aged 1 month to 21 years. It is also being studied in the treatment of other types of cancer. Calaspargase pegol is made up of the enzyme L-asparaginase that is linked to a substance called SC-PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. Calaspargase pegol is a type of protein synthesis inhibitor. Also called Asparlas, EZN-2285, and SC-PEG E. coli L-asparaginase.
    More Information
    - Calaspargase Pegol-mknl (https://www.cancer.gov/about-cancer/treatment/drugs/calaspargasepegol-mknl)
  calbindin: (KAL-bine-din)
    Pronunciation of dictionary term "calbindin"
    A group of proteins that bind calcium and move it into cells. Calbindins are found in many different tissues in the body.
  calcification: (KAL-sih-fih-KAY-shun)
    Pronunciation of dictionary term "calcification"
    Deposits of calcium in the tissues. Calcification in the breast can be seen on a mammogram, but cannot be detected by touch. There are two types of breast calcification, macrocalcification and microcalcification. Macrocalcifications are large deposits and are usually not related to cancer. Microcalcifications are specks of calcium that may be found in an area of rapidly dividing cells. Many microcalcifications clustered together may be a sign of cancer.
  calcinosis: (KAL-sih-NOH-sis)
    Pronunciation of dictionary term "calcinosis"
    A condition in which abnormal amounts of calcium salts are found in soft tissue, such as muscle.
  calcitonin: (KAL-sih-TOH-nin)
    Pronunciation of dictionary term "calcitonin"
    A hormone formed by the C cells of the thyroid gland. It helps maintain a healthy level of calcium in the blood. When the calcium level is too high, calcitonin lowers it.
  calcitriol: (KAL-sih-TRY-ol)
    Pronunciation of dictionary term "calcitriol"
    The active form of vitamin D. Calcitriol is formed in the kidneys or made in the laboratory. It is used as a drug to increase calcium levels in the body in order to treat skeletal and tissue-related calcium deficiencies caused by kidney or thyroid disorders.
  calcium: (KAL-see-um)
    Pronunciation of dictionary term "calcium"
    A mineral needed for healthy teeth, bones, and other body tissues. It is the most common mineral in the body. A deposit of calcium in body tissues, such as breast tissue, may be a sign of disease.
  calcium antagonist: (KAL-see-um an-TA-guh-nist)
    Pronunciation of dictionary term "calcium antagonist"
    A type of drug that keeps calcium from entering the muscle cells of the heart and blood vessels. This causes the blood vessels to relax and widen, which allows the blood to flow more easily and lowers blood pressure. Some calcium antagonists may also slow the heartbeat. Calcium antagonists are used to treat high blood pressure, chest pain (angina), abnormal heartbeat (arrhythmia), and several other conditions. Also called calcium channel blocker.
  calcium Ca 41-chloride aqueous solution: (KAL-see-um … KLOR-ide AY-kwee-us suh-LOO-shun)
    Pronunciation of dictionary term "calcium Ca 41-chloride aqueous solution"
    A substance used to diagnose and monitor cancer that has spread to the bones. It is also used to study the turnover of bone tissue and to diagnose other conditions that affect the bones, such as osteoporosis. Calcium Ca 41 is a form of calcium that gives off radiation. It is passed from the body in the urine.
  calcium Ca 46-chloride aqueous solution: (KAL-see-um … KLOR-ide AY-kwee-us suh-LOO-shun)
    Pronunciation of dictionary term "calcium Ca 46-chloride aqueous solution"
    A substance used to study the turnover of bone tissue in certain diseases, such as osteoporosis or cancer that has spread to the bone. Calcium Ca 46 is a form of calcium that gives off radiation. It is passed from the body in the urine.
  calcium carbonate: (KAL-see-um KAR-buh-nayt)
    Pronunciation of dictionary term "calcium carbonate"
    A form of the mineral calcium that is used to prevent or treat osteoporosis (a decrease in bone mass and density) and to treat heartburn and upset stomach. It is also being studied in the prevention of bone problems in people with cancer. It is a type of dietary supplement.
  calcium channel blocker: (KAL-see-um CHA-nul BLAH-ker)
    Pronunciation of dictionary term "calcium channel blocker"
    A type of drug that keeps calcium from entering the muscle cells of the heart and blood vessels. This causes the blood vessels to relax and widen, which allows the blood to flow more easily and lowers blood pressure. Some calcium channel blockers may also slow the heartbeat. Calcium channel blockers are used to treat high blood pressure, chest pain (angina), abnormal heartbeat (arrhythmia), and several other conditions. Also called calcium antagonist.
  calcium gluconate: (KAL-see-um GLOO-koh-nayt)
    Pronunciation of dictionary term "calcium gluconate"
    The mineral calcium combined with a form of the sugar glucose. It is used to prevent and treat osteoporosis (a decrease in bone mass and density). It is also being studied in the treatment of bone loss and nerve damage caused by chemotherapy. It is a type of dietary supplement.
  calcium infusion test: (KAL-see-um in-FYOO-zhun …)
    Pronunciation of dictionary term "calcium infusion test"
    A test used to help diagnose a type of pancreatic islet cell tumor called a gastrinoma. The patient receives a 3-hour infusion of a substance called calcium gluconate and the amount of gastrin in the blood is measured. An increase in the level of gastrin in the blood after the infusion may be a sign of a gastrinoma.
  calendula ointment: (kuh-LEN-juh-luh OYNT-ment)
    Pronunciation of dictionary term "calendula ointment"
    A substance made from the flower of the marigold plant Calendula officinalis. Calendula-based skin products have been used to treat minor cuts, burns, and skin irritation. The products that are available in the United States may not contain the same amount or mixture of ingredients and may not be effective. Another product, Calendula ointment, is being studied in France in the prevention of dermatitis in patients having radiation therapy for breast cancer. The ointment being studied is not available in the United States.
  calgranulin A: (kal-GRAN-yoo-lin ...)
    Pronunciation of dictionary term "calgranulin A"
    A protein that is made by many different types of cells and is involved in processes that take place both inside and outside of the cell. It is made in larger amounts in inflammatory diseases such as rheumatoid arthritis, and in some types of cancer. It is being studied as a biomarker for breast cancer. Also called S100 calcium binding protein A8.
  calgranulin B: (kal-GRAN-yoo-lin ...)
    Pronunciation of dictionary term "calgranulin B"
    A protein that is made by many different types of cells and is involved in processes that take place both inside and outside of the cell. It is made in larger amounts in inflammatory diseases such as rheumatoid arthritis, and in some types of cancer. It is being studied as a biomarker for breast cancer. Also called S100 calcium binding protein A9.
  caloric intake: (kuh-LOR-ik In-tayk)
    Pronunciation of dictionary term "caloric intake"
    Refers to the number of calories (energy content) consumed.
  calorie: (KA-luh-ree)
    Pronunciation of dictionary term "calorie"
    A measurement of the energy content of food. The body needs calories as to perform its functions, such as breathing, circulating the blood, and physical activity. When a person is sick, their body may need extra calories to fight fever or other problems.
  Calquence: (KAL-kwents)
    Pronunciation of dictionary term "Calquence"
    A drug used alone to treat adults with chronic lymphocytic leukemia or small lymphocytic lymphoma and adults with mantle cell lymphoma that has already been treated with at least one other therapy. Calquence is used with bendamustine and rituximab to treat adults with mantle cell lymphoma that has not been treated and who cannot receive an autologous stem cell transplant. It is also being studied in the treatment of other types of cancer. Calquence blocks a protein called BTK, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called acalabrutinib maleate monohydrate.
    More Information
    - Acalabrutinib Maleate Monohydrate (https://www.cancer.gov/about-cancer/treatment/drugs/acalabrutinib)
  CALR gene: (… jeen)
    Pronunciation of dictionary term "CALR gene"
    A gene that makes a protein that is involved in many cell functions. This protein helps control the amount of calcium that is stored in cells. This is thought to play a role in the control of gene activity, cell growth and movement, the attachment of cells to one another, and cell death. Mutated (changed) forms of the CALR gene have been found in some types of blood conditions, including essential thrombocythemia and primary myelofibrosis.
  CAM: A term used to describe a medical product or practice that is used together with (complementary) or instead of (alternative) standard medical care. Usually, less is known about most types of CAM than about standard treatments, which go through a long and careful research process to prove they are safe and effective. CAM may include dietary supplements, megadose vitamins, herbal preparations, special teas, acupuncture, massage therapy, magnet therapy, spiritual healing, and meditation. Also called complementary and alternative medicine.
    More Information
    - Complementary and Alternative Medicine (https://www.cancer.gov/about-cancer/treatment/cam)
  Camcevi: (kam-SEE-vee)
    Pronunciation of dictionary term "Camcevi"
    A drug used to treat adults with advanced prostate cancer. Camcevi initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men. With continued use, Camcevi lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels. Camcevi may stop the growth of cancer cells that need testosterone to grow. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist. Also called leuprolide mesylate.
    More Information
    - Leuprolide Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/leuprolide-mesylate)
  Campath: (KAM-path)
    Pronunciation of dictionary term "Campath"
    A drug used to treat B-cell chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. Campath binds to a protein called CD52, which is found on some types of immune cells and cancer cells. This may help the immune system kill cancer cells. Campath is a type of monoclonal antibody. Also called alemtuzumab.
    More Information
    - Alemtuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/alemtuzumab)
  camphor: (KAM-fer)
    Pronunciation of dictionary term "camphor"
    A substance that comes from the wood and bark of the camphor tree or is made in the laboratory. It has a very unique smell and taste and is used in commercial products (for example, mothballs). Camphor is used in topical anti-infective and anti-pruritic (anti-itching) agents.
  Camptosar: (KAMP-toh-sar)
    Pronunciation of dictionary term "Camptosar"
    A drug used alone or with other drugs to treat colorectal cancer that has spread to other parts of the body. It is used in patients whose cancer has not already been treated or whose cancer has recurred (come back) or has gotten worse after treatment with anticancer drugs that included fluorouracil. It is also being studied in the treatment of other types of cancer. Camptosar blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called CPT 11 and irinotecan hydrochloride.
    More Information
    - Irinotecan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
  camptothecin: (KAMP-toh-THEH-kin)
    Pronunciation of dictionary term "camptothecin"
    An anticancer drug that belongs to the family of drugs called topoisomerase inhibitors.
  camptothecin analog: (KAMP-toh-THEH-kin A-nuh-log)
    Pronunciation of dictionary term "camptothecin analog"
    An anticancer drug related in structure to camptothecin, a topoisomerase inhibitor. One such drug is aminocamptothecin.
  Cancell: (kan-SEL)
    Pronunciation of dictionary term "Cancell"
    A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in Cancell have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give Cancell as a treatment for any disease. Also called 126–F, Cantron, Jim’s Juice, JS–101, JS–114, Protocel, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  cancer: (KAN-ser)
    Pronunciation of dictionary term "cancer"
    A term for diseases in which abnormal cells divide without control and can invade nearby tissues. Cancer cells can also spread to other parts of the body through the blood and lymph systems. There are several main types of cancer. Carcinoma is a cancer that begins in the skin or in tissues that line or cover internal organs. Sarcoma is a cancer that begins in bone, cartilage, fat, muscle, blood vessels, or other connective or supportive tissue. Leukemia is a cancer that begins in blood-forming tissue, such as the bone marrow, and causes too many abnormal blood cells to be made. Lymphoma and multiple myeloma are cancers that begin in the cells of the immune system. Central nervous system cancers are cancers that begin in the tissues of the brain and spinal cord. Also called malignancy.
    More Information
    - What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)
  cancer antigen 125: (KAN-ser AN-tih-jen...)
    Pronunciation of dictionary term "cancer antigen 125"
    A substance that may be found in high amounts in the blood of patients with certain types of cancer, including ovarian cancer. Cancer antigen 125 levels may also help monitor how well cancer treatments are working or if cancer has come back. Also called CA-125.
  cancer cell line: (KAN-ser sel line)
    Pronunciation of dictionary term "cancer cell line"
    Cancer cells that keep dividing and growing over time, under certain conditions in a laboratory. Cancer cell lines are used in research to study the biology of cancer and to test cancer treatments.
  cancer cluster: (KAN-ser KLUS-ter)
    Pronunciation of dictionary term "cancer cluster"
    The occurrence of a larger-than-expected number of cases of cancer within a group of people in a geographic area over a period of time.
    More Information
    - Cancer Clusters (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/cancer-clusters-fact-sheet)
  Cancer Information Service: (KAN-ser in-fer-MAY-shun SER-vis)
    Pronunciation of dictionary term "Cancer Information Service"
    The National Cancer Institute’s Cancer Information Service (CIS) provides cancer-related information to the public, free of charge. CIS staff provide personalized responses to questions in easy-to-understand language. Help with quitting smoking is also available. Contact CIS (https://www.cancer.gov/contact) by calling 1-800-4-CANCER (1-800-422-6237), or by using the LiveHelp instant-messaging service at https://livehelp.cancer.gov (https://livehelp.cancer.gov/app/chat/chat_launch). Also called CIS.
    More Information
    - The Cancer Information Service (CIS) (https://www.cancer.gov/contact)
  Cancer Intervention and Surveillance Modeling Network: (KAN-ser IN-ter-VEN-shun … ser-VAY-lents MAH-duh-ling NET-wurk)
    Pronunciation of dictionary term "Cancer Intervention and Surveillance Modeling Network"
    A group of researchers supported by the National Cancer Institute (NCI) who use statistical models to help understand how cancer prevention, screening, and treatment programs can affect the number of new cases of cancer diagnosed each year and the number of deaths from cancer each year. The Cancer Intervention and Surveillance Modeling Network is now studying breast, colorectal, esophageal, lung, and prostate cancers. The models they create help guide future cancer control strategies, research priorities, policies, and decision making. Also called CISNET.
  cancer of the adrenal cortex: (KAN-ser ... uh-DREE-nul KOR-tex)
    Pronunciation of dictionary term "cancer of the adrenal cortex"
    A rare cancer that forms in the outer layer of tissue of the adrenal gland (a small organ on top of each kidney that makes steroid hormones, adrenaline, and noradrenaline to control heart rate, blood pressure, and other body functions). Also called adrenocortical cancer and adrenocortical carcinoma.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  cancer of unknown primary origin: (KAN-ser ... UN-none PRY-mayr-ee OR-ih-jin)
    Pronunciation of dictionary term "cancer of unknown primary origin"
    A case in which cancer cells are found in the body, but the place where the cells first started growing (the origin or primary site) cannot be determined. Also called carcinoma of unknown primary and CUP.
    More Information
    - Carcinoma of Unknown Primary (https://www.cancer.gov/types/unknown-primary)
    In cancer of unknown primary, cancer cells have spread in the body but the place where the primary cancer began is not known.
    Cancer of unknown primary; drawing shows a primary tumor that has spread from an unknown site to other parts of the body (the lung and the brain). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph systems, to another part of the body where a metastatic tumor has formed.
  cancer predisposing gene mutation: (KAN-ser PREE-dih-SPOH-zing jeen myoo-TAY-shun)
    Pronunciation of dictionary term "cancer predisposing gene mutation"
    A term used to describe mutations (changes) in certain genes that may increase a person’s risk of some types of cancer. For example, a person who has certain mutations in the BRCA1 or BRCA2 gene has higher than normal risks of developing breast cancer and ovarian cancer. Cancer predisposing gene mutations are usually inherited (passed from parent to child) and may be seen within families. Knowing if a person has a cancer predisposing gene mutation may help prevent, diagnose, and treat cancer. Not all people who have a cancer predisposing gene mutation will develop cancer. Also called cancer susceptibility gene mutation.
  cancer predisposition gene: (KAN-ser PREE-dih-spuh-ZIH-shun jeen)
    Pronunciation of dictionary term "cancer predisposition gene"
    A term used to describe a gene that may increase a person’s risk of developing some types of cancer if it has certain mutations (changes). For example, a person who has mutations in the BRCA1 or BRCA2 gene has more risk than normal of developing breast cancer and/or ovarian cancer. Cancer predisposition genes are usually passed from parent to child and may be seen within families. Knowing if a person has a cancer predisposition gene may help prevent, diagnose, and treat cancer. Not all people who have a cancer predisposition gene will develop cancer. Also called cancer susceptibility gene.
  cancer prevention vaccine: (KAN-ser pree-VEN-shun vak-SEEN)
    Pronunciation of dictionary term "cancer prevention vaccine"
    A type of vaccine that helps protect the body against infection with viruses that can cause certain types of cancer later in life. Two types of cancer prevention vaccines are approved in the United States. The human papillomavirus (HPV) vaccine, Gardasil 9, prevents infection with certain types of HPV that can cause cancers of the cervix, vagina, vulva, anus, penis, and oropharynx (throat). The hepatitis B virus (HBV) vaccine prevents infection that can cause serious liver disease, including liver cancer.
    More Information
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  cancer subtype: (KAN-ser SUB-tipe)
    Pronunciation of dictionary term "cancer subtype"
    Describes the smaller groups that a type of cancer can be divided into, based on certain characteristics of the cancer cells. These characteristics include how the cancer cells look under a microscope and whether there are certain substances in or on the cells or certain changes to the DNA of the cells. It is important to know the subtype of a cancer in order to plan treatment and determine prognosis.
  cancer susceptibility gene: (KAN-ser suh-SEP-tih-BIH-lih-tee jeen)
    Pronunciation of dictionary term "cancer susceptibility gene"
    A term used to describe a gene that may increase a person’s risk of developing some types of cancer if it has certain mutations (changes). For example, a person who has mutations in the BRCA1 or BRCA2 gene has more risk than normal of developing breast cancer and/or ovarian cancer. Cancer susceptibility genes are usually passed from parent to child and may be seen within families. Knowing if a person has a cancer susceptibility gene may help prevent, diagnose, and treat cancer. Not all people who have a cancer susceptibility gene will develop cancer. Also called cancer predisposition gene.
  cancer susceptibility gene mutation: (KAN-ser suh-SEP-tih-BIH-lih-tee jeen myoo-TAY-shun)
    Pronunciation of dictionary term "cancer susceptibility gene mutation"
    A term used to describe mutations (changes) in certain genes that may increase a person’s risk of some types of cancer. For example, a person who has certain mutations in the BRCA1 or BRCA2 gene has higher than normal risks of developing breast cancer and ovarian cancer. Cancer susceptibility gene mutations are usually inherited (passed from parent to child) and may be seen within families. Knowing if a person has a cancer susceptibility gene mutation may help prevent, diagnose, and treat cancer. Not all people who have a cancer susceptibility gene mutation will develop cancer. Also called cancer predisposing gene mutation.
  cancer treatment vaccine: (KAN-ser TREET-ment vak-SEEN)
    Pronunciation of dictionary term "cancer treatment vaccine"
    A type of treatment that helps the body’s immune system recognize and destroy cancer cells. A cancer treatment vaccine may be made from a patient’s own tumor cells, from their dendritic cells (a type of immune cell), or from certain proteins or other molecules found on the cancer cells of many people with that cancer. Another type of cancer treatment vaccine is made from a virus that infects and breaks down cancer cells. Cancer treatment vaccines are being used to treat certain types of prostate cancer and melanoma. They are also being studied in the treatment of other types of cancer. Cancer treatment vaccines are a type of immunotherapy.
    More Information
    - Cancer Treatment Vaccines (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/cancer-treatment-vaccines)
  cancer vaccine: (KAN-ser vak-SEEN)
    Pronunciation of dictionary term "cancer vaccine"
    A type of treatment that helps the body’s immune system recognize and destroy cancer cells. A cancer vaccine may be made from a patient’s own tumor cells, from their dendritic cells (a type of immune cell), or from certain proteins or other molecules found on the cancer cells of many people with that cancer. Another type of cancer vaccine is made from a virus that infects and breaks down cancer cells. Cancer vaccines are being used to treat certain types of prostate cancer and melanoma. They are also being studied in the treatment of other types of cancer. Cancer vaccines are a type of immunotherapy. Also called cancer treatment vaccine.
    More Information
    - Cancer Treatment Vaccines (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/cancer-treatment-vaccines)
  cancer-related post-traumatic stress: (KAN-ser-ree-LAY-ted post-traw-MA-tik stress)
    Pronunciation of dictionary term "cancer-related post-traumatic stress"
    A condition that develops in some people who are diagnosed with cancer. Symptoms of cancer-related post-traumatic stress (PTS) include having frightening thoughts or trouble sleeping, being distracted or overexcited, feeling alone, or losing interest in daily activities. Symptoms may also include feelings of shock, fear, helplessness, or horror. Cancer-related PTS can occur anytime after diagnosis, including during or after treatment. Relaxation training, counseling, support groups, and certain medicines may be used to reduce symptoms of PTS.
  candidiasis: (KAN-dih-DY-uh-sis)
    Pronunciation of dictionary term "candidiasis"
    A condition in which Candida albicans, a type of yeast, grows out of control in moist skin areas of the body. It is usually a result of a weakened immune system, but can be a side effect of chemotherapy or treatment with antibiotics. Candidiasis usually affects the mouth (oral candidiasis); however, rarely, it spreads throughout the entire body. Also called candidosis and thrush.
  candidosis: (KAN-dih-DOH-sis)
    Pronunciation of dictionary term "candidosis"
    A condition in which Candida albicans, a type of yeast, grows out of control in moist skin areas of the body. It is usually a result of a weakened immune system, but can be a side effect of chemotherapy or treatment with antibiotics. Candidosis usually affects the mouth (oral candidosis); however, rarely, it spreads throughout the entire body. Also called candidiasis and thrush.
  canertinib: (can-ER-tih-nib)
    Pronunciation of dictionary term "canertinib"
    A substance being studied in the treatment of some types of cancer. Canertinib blocks the action of proteins called epidermal growth factor receptors, and may cause cancer cells to die. It is a type of tyrosine kinase inhibitor. Also called canertinib dihydrochloride and CI-1033.
  canertinib dihydrochloride: (can-ER-tih-nib dy-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "canertinib dihydrochloride"
    A substance being studied in the treatment of some types of cancer. Canertinib dihydrochloride blocks the action of proteins called epidermal growth factor receptors, and may cause cancer cells to die. It is a type of tyrosine kinase inhibitor. Also called CI-1033.
  cannabidiol: (kuh-NA-bih-DY-ol)
    Pronunciation of dictionary term "cannabidiol"
    A chemical that comes from the hemp (Cannabis sativa) plant. Cannabidiol contains very low levels of delta-9-THC (the main chemical that causes the “high” of marijuana). It may help relieve pain, lower inflammation, and reduce anxiety without causing the mind-altering effects of marijuana. Cannabidiol comes in many forms, including oils, extracts, capsules, and patches. One specific form has been approved in the United States as a drug to treat seizures in certain people. Cannabidiol is also being studied in the treatment of symptoms or side effects caused by cancer and cancer treatment. It is a type of cannabinoid. Also called CBD.
    More Information
    - Cannabis and Cannabinoids
  cannabinoid: (kuh-NA-bih-noyd)
    Pronunciation of dictionary term "cannabinoid"
    A type of chemical in marijuana that causes drug-like effects all through the body, including the central nervous system and the immune system. The main active cannabinoid in marijuana is delta-9-tetrahydrocannabinol (THC). Cannabinoids may help treat the symptoms of cancer or the side effects of cancer treatment.
    More Information
    - Cannabis and Cannabinoids
  Cannabis: (KA-nuh-bis)
    Pronunciation of dictionary term "Cannabis"
    The dried leaves and flowering tops of the Cannabis sativa or Cannabis indica plant. Cannabis contains active chemicals called cannabinoids that cause drug-like effects all through the body, including the central nervous system and the immune system. Cannabis may help treat the symptoms of cancer or the side effects of cancer treatment, such as nausea and vomiting, pain, and cachexia (loss of body weight and muscle mass). Also called marijuana.
    More Information
    - Cannabis and Cannabinoids
  Cantron: (KAN-tron)
    Pronunciation of dictionary term "Cantron"
    A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in Cantron have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give Cantron as a treatment for any disease. Also called 126–F, Cancell, Jim’s Juice, JS–101, JS–114, Protocel, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  CAP-1: A small piece of a tumor marker called carcinoembryonic antigen (CEA). CEA may be found in the blood of people who have colon cancer, other types of cancer or diseases, or who smoke tobacco. CAP-1 is used to make a vaccine that may help stimulate the body’s immune system to kill cancer cells. Also called carcinoembryonic antigen peptide-1 and CEA peptide-1.
  capecitabine: (ka-peh-SY-tuh-been)
    Pronunciation of dictionary term "capecitabine"
    A drug used alone or with other drugs to treat certain types of colorectal cancer, breast cancer, esophageal cancer, gastroesophageal junction cancer, stomach cancer, and pancreatic cancer. It is also being studied in the treatment of other types of cancer. Capecitabine is taken up by cancer cells and breaks down into fluorouracil, a substance that kills cancer cells. Capecitabine is a type of antimetabolite. Also called Xeloda.
    More Information
    - Capecitabine (https://www.cancer.gov/about-cancer/treatment/drugs/capecitabine)
  capillary: (KA-pih-layr-ee)
    Pronunciation of dictionary term "capillary"
    The smallest type of blood vessel. A capillary connects an arteriole (small artery) to a venule (small vein) to form a network of blood vessels in almost all parts of the body. The wall of a capillary is thin and leaky, and capillaries are involved in the exchange of fluids and gases between tissues and the blood.
  capillary leak syndrome: (KA-pih-layr-ee leek SIN-drome)
    Pronunciation of dictionary term "capillary leak syndrome"
    A condition in which fluid and proteins leak out of tiny blood vessels and flow into surrounding tissues, resulting in dangerously low blood pressure. Capillary leak syndrome may lead to multiple organ failure and shock.
  capillary malformation: (KA-pih-layr-ee MAL-for-MAY-shun)
    Pronunciation of dictionary term "capillary malformation"
    An overgrowth of capillaries (small blood vessels) near the surface of the skin. Capillary malformations are present at birth and look like pink, red, or purple patches on the skin. They usually appear on the face or neck but can occur anywhere. Large capillary malformations are sometimes called port-wine stains, which tend to grow and become darker over time. They may also become raised or bumpy. Most capillary malformations do not cause health problems, but some may be associated with certain rare conditions such as Sturge-Weber syndrome, Klippel-Trenaunay syndrome, and Proteus syndrome.
  capillary malformation-arteriovenous malformation syndrome: (KA-pih-layr-ee MAL-for-MAY-shun-ar-TEER-ee-oh-VEE-nus MAL-for-MAY-shun SIN-drome)
    Pronunciation of dictionary term "capillary malformation-arteriovenous malformation syndrome"
    A rare genetic condition that causes abnormalities of blood vessels, including swelling of the capillaries (small blood vessels) near the surface of the skin. The swollen capillaries usually appear as small, round, pink or red spots on the skin of the face, arms, and legs. They may appear at birth or develop during childhood. More serious blood vessel abnormalities that affect the skin, muscle, bone, spine, brain, and heart may also occur. These can lead to serious problems, including abnormal bleeding, migraines, seizures, and congestive heart failure. Capillary malformation-arteriovenous malformation syndrome is a type of disease called a RASopathy that is caused by mutations (changes) in the RASA1 gene. This gene makes a protein involved in a cell signaling pathway that controls many important cell functions. Also called CM-AVM syndrome.
  CAPIRI: An abbreviation for a chemotherapy combination used to treat colorectal cancer that has spread to other parts of the body. It is also used to treat esophageal cancer and stomach cancer that are advanced or have spread to other parts of the body. It includes the drugs capecitabine (Xeloda) and irinotecan hydrochloride. Also called CAPIRI regimen, XELIRI, and XELIRI regimen.
    More Information
    - XELIRI (https://www.cancer.gov/about-cancer/treatment/drugs/XELIRI)
  CAPIRI regimen: (... REH-jih-men)
    Pronunciation of dictionary term "CAPIRI regimen"
    An abbreviation for a chemotherapy combination used to treat colorectal cancer that has spread to other parts of the body. It is also used to treat esophageal cancer and stomach cancer that are advanced or have spread to other parts of the body. It includes the drugs capecitabine (Xeloda) and irinotecan hydrochloride. Also called CAPIRI, XELIRI, and XELIRI regimen.
    More Information
    - XELIRI (https://www.cancer.gov/about-cancer/treatment/drugs/XELIRI)
  capivasertib: (ka-PEE-vah-SER-tib)
    Pronunciation of dictionary term "capivasertib"
    A drug used with fulvestrant to treat adults with hormone-receptor positive, HER2-negative breast cancer that has spread and has an abnormal PIK3CA, AKT1, or PTEN gene. It is used in patients whose cancer came back or got worse during or after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. Capivasertib blocks a protein called AKT, which is involved in cell signaling, cell growth, and cell survival. Blocking this protein may help keep cancer cells from growing and may kill them. Capivasertib is a type of kinase inhibitor. Also called Truqap.
    More Information
    - Capivasertib (https://www.cancer.gov/about-cancer/treatment/drugs/capivasertib)
  caplacizumab: (KAP-luh-SIH-zoo-mab)
    Pronunciation of dictionary term "caplacizumab"
    A drug used with plasma exchange and immunosuppressive therapy to treat acquired thrombotic thrombocytopenic purpura (aTTP). aTTP is a rare blood disorder in which blood clots form in small blood vessels throughout the body. Caplacizumab binds to a protein called VWF, which may help keep blood clots from forming. It is a type of nanobody (a tiny antibody). Also called Cablivi.
    More Information
    - Caplacizumab-yhdp (https://www.cancer.gov/about-cancer/treatment/drugs/caplacizumab-yhdp)
  capmatinib hydrochloride: (kap-MA-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "capmatinib hydrochloride"
    A drug used to treat adults with non-small cell lung cancer that has spread and has a certain mutation (change) in the MET gene. It is also being studied in the treatment of other types of cancer. Capmatinib hydrochloride blocks a protein made by the MET gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Tabrecta.
    More Information
    - Capmatinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/capmatinibhydrochloride)
  CAPOX: An abbreviation for a chemotherapy combination used to treat advanced colorectal cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs capecitabine and oxaliplatin. Also called CAPOX regimen.
    More Information
    - CAPOX (https://www.cancer.gov/about-cancer/treatment/drugs/CAPOX)
  CAPOX regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CAPOX regimen"
    An abbreviation for a chemotherapy combination used to treat advanced colorectal cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs capecitabine and oxaliplatin. Also called CAPOX.
    More Information
    - CAPOX (https://www.cancer.gov/about-cancer/treatment/drugs/CAPOX)
  Caprelsa: (ka-PREL-suh)
    Pronunciation of dictionary term "Caprelsa"
    A drug used to treat medullary thyroid cancer that is locally advanced and cannot be removed by surgery or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Caprelsa blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Caprelsa is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called vandetanib and ZD6474.
    More Information
    - Vandetanib (https://www.cancer.gov/about-cancer/treatment/drugs/vandetanib)
  capromab pendetide: (KAP-roh-mab PEN-deh-tide)
    Pronunciation of dictionary term "capromab pendetide"
    A substance used to detect prostate cancer. It contains a monoclonal antibody that binds to prostate cells, linked to a substance that can bind radioisotopes. Capromab pendetide is combined with indium 111 and injected into the body. A gamma camera (a special camera that detects radioactivity) is used to find prostate cancer cells in the body. Capromab pendetide is a type of immunoconjugate. Also called ProstaScint.
  capsaicin: (kap-SAY-ih-sin)
    Pronunciation of dictionary term "capsaicin"
    A component of certain plants, including cayenne and red pepper, used topically for peripheral nerve pain. It is also being studied for controlling mucositis pain after chemotherapy and radiation therapy.
  capsule: (KAP-sul)
    Pronunciation of dictionary term "capsule"
    In medicine, a sac of tissue and blood vessels that surrounds an organ, joint, or tumor. A capsule is also a form used for medicine that is taken by mouth. It usually has a shell made of gelatin with the medicine inside.
  capsule endoscope: (KAP-sul EN-doh-SKOPE)
    Pronunciation of dictionary term "capsule endoscope"
    A device used to look at the inside of the intestines and other parts of the digestive tract. It is a capsule that is about the size of a large pill, with a lens, a light, a camera, a radio transmitter, and a battery inside. The patient swallows the capsule and it takes pictures as it travels through the digestive tract. The pictures are sent to a small recorder that is worn on the patient’s waist or shoulder. The pictures are then viewed on a computer by the doctor to check for signs of disease. The capsule endoscope passes out of the body during a bowel movement. Also called wireless capsule endoscope.
  capsule endoscopy: (KAP-sul en-DOS-koh-pee)
    Pronunciation of dictionary term "capsule endoscopy"
    A procedure used to look at the inside of the intestines and other parts of the digestive tract. The patient swallows a capsule about the size of a large pill. The capsule contains a tiny wireless camera that travels through the digestive tract. It takes pictures of the inside of the digestive tract and sends them to a small recorder that is worn on the patient’s waist or shoulder. The pictures are then viewed on a computer by the doctor to check for signs of disease. The capsule passes out of the body during a bowel movement.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  captopril: (KAP-toh-pril)
    Pronunciation of dictionary term "captopril"
    A drug used to treat high blood pressure that is also being studied in the prevention of side effects caused by radiation therapy used in the treatment of cancer. It belongs to the family of drugs called ACE inhibitors.
  CAR: A special receptor created in the laboratory that is designed to bind to certain proteins on cancer cells. The CAR is then added to immune cells called T cells. This helps the T cells find and kill cancer cells that have the specific protein that the receptor is designed to bind. These changed T cells called CAR T cells are then grown in large numbers in the laboratory and given to cancer patients. CAR T cells are being studied in the treatment of some types of cancer. Also called chimeric antigen receptor.
  CAR T-cell therapy: (kar T-sel THAYR-uh-pee)
    Pronunciation of dictionary term "CAR T-cell therapy"
    A type of treatment in which a patient's T cells (a type of immune system cell) are changed in the laboratory so they will attack cancer cells. T cells are taken from a patient’s blood. Then the gene for a special receptor that binds to a certain protein on the patient’s cancer cells is added to the T cells in the laboratory. The special receptor is called a chimeric antigen receptor (CAR). Large numbers of the CAR T cells are grown in the laboratory and given to the patient by infusion. CAR T-cell therapy is used to treat certain blood cancers, and it is being studied in the treatment of other types of cancer. Also called chimeric antigen receptor T-cell therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  Carac: (KAYR-ak)
    Pronunciation of dictionary term "Carac"
    A drug that contains the active ingredient fluorouracil and is used as a cream to treat actinic keratosis (a skin condition that may become cancer). Carac stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  carbamide: (KAR-buh-MIDE)
    Pronunciation of dictionary term "carbamide"
    A substance formed by the breakdown of protein in the liver. The kidneys filter carbamide out of the blood and into the urine. Carbamide can also be made in the laboratory. A topical form of carbamide is being studied in the treatment of hand-foot syndrome (pain, swelling, numbness, tingling, or redness of the hands or feet that may occur as a side effect of certain anticancer drugs). Also called urea.
  carbendazim: (kar-BEN-duh-zim)
    Pronunciation of dictionary term "carbendazim"
    An anticancer drug that belongs to the family of drugs called antifungal agents.
  Carbo-Tax regimen: (KAR-boh-tax REH-jih-men)
    Pronunciation of dictionary term "Carbo-Tax regimen"
    A chemotherapy combination used to treat endometrial, ovarian, and head and neck cancers, and non-small cell lung cancer that has spread. It includes the drugs carboplatin and paclitaxel (Taxol). Also called carboplatin-Taxol, carboplatin-Taxol regimen, and PC regimen.
  carbogen: (KAR-boh-jen)
    Pronunciation of dictionary term "carbogen"
    An inhaled form of oxygen and carbon dioxide that has more oxygen than air has. It is being studied in the treatment of cancer and other conditions. It may increase the amount of oxygen in cancer cells, which may make them easier to kill with radiation therapy. Carbogen is a type of radiosensitizing agent.
  carbohydrate: (KAR-boh-HY-drayt)
    Pronunciation of dictionary term "carbohydrate"
    A sugar molecule. Carbohydrates can be small and simple (for example, glucose) or they can be large and complex (for example, polysaccharides such as starch, chitin or cellulose).
  carbolic acid: (kar-BAH-lik A-sid)
    Pronunciation of dictionary term "carbolic acid"
    A very poisonous chemical substance made from tar and also found in some plants and essential oils (scented liquid taken from plants). Carbolic acid is used to make plastics, nylon, epoxy, medicines, and to kill germs. Also called phenol.
  carbon C 11-acetate: (KAR-bun ... A-seh-tayt)
    Pronunciation of dictionary term "carbon C 11-acetate"
    A radioactive substance being studied in positron emission tomography (PET) imaging. Carbon C 11-acetate gets taken up by cells in the body, and a PET scanner is used to find which cells in the body have taken it up. Since more carbon C 11-acetate is taken up by cancer cells than by normal cells, it can be used to help find cancer in the body and diagnose disease. Also called 11C-acetate.
  carbon C 11-choline: (KAR-bun ... KOH-leen)
    Pronunciation of dictionary term "carbon C 11-choline"
    A radioactive substance being studied in positron emission tomography (PET) imaging to find certain types of cancer. Carbon C 11-choline gets taken up by cells in the body and more of it is taken up by cancer cells than by normal cells. A PET scanner is used to find which cells in the body have taken up carbon C 11-choline. Also called 11C-choline.
  carbon C 11-choline PET-CT scan: (KAR-bun … KOH-leen … skan)
    Pronunciation of dictionary term "carbon C 11-choline PET-CT scan"
    A procedure in which a small amount of carbon C 11-choline (a radioactive form of the vitamin choline) is injected into a vein. A scanner and a computer are used to make detailed pictures of areas inside the body where the carbon C 11-choline collects. Cancer cells take up more carbon C 11-choline than normal cells, so the pictures can be used to find cancer cells in the body. Also called 11C-choline PET-CT scan.
  carbon dioxide: (KAR-bun dy-OK-side)
    Pronunciation of dictionary term "carbon dioxide"
    A colorless, odorless gas. It is a waste product made by the body. Carbon dioxide travels in the blood from the body’s tissues to the lungs. Breathing out clears carbon dioxide from the lungs.
  carbon monoxide: (KAR-bun muh-NOK-side)
    Pronunciation of dictionary term "carbon monoxide"
    A poisonous gas that has no color or odor. It is given off by burning fuel (as in exhaust from cars or household heaters) and tobacco products. Carbon monoxide prevents red blood cells from carrying enough oxygen for cells and tissues to live.
  carboplatin: (KAR-boh-pla-tin)
    Pronunciation of dictionary term "carboplatin"
    A drug used to treat advanced ovarian cancer that has never been treated or has come back after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Carboplatin works in a way similar to the anticancer drug cisplatin and causes fewer side effects. It damages the cell’s DNA and may kill cancer cells. Carboplatin is a type of platinum compound.
    More Information
    - Carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
  carboplatin-paclitaxel-bevacizumab regimen: (KAR-boh-pla-tin-PA-klih-TAK-sil-beh-vuh-SIH-zoo-mab REH-jih-men)
    Pronunciation of dictionary term "carboplatin-paclitaxel-bevacizumab regimen"
    A chemotherapy combination used to treat advanced, nonsquamous non-small cell lung cancer. It includes the drugs carboplatin, paclitaxel (Taxol), and bevacizumab. Also called carboplatin-Taxol-bevacizumab regimen.
  carboplatin-Taxol: (KAR-boh-pla-tin-TAK-sol)
    Pronunciation of dictionary term "carboplatin-Taxol"
    A chemotherapy combination used to treat endometrial, ovarian, and head and neck cancers, and non-small cell lung cancer that has spread. It includes the drugs carboplatin and paclitaxel (Taxol). Also called Carbo-Tax regimen, carboplatin-Taxol regimen, and PC regimen.
  carboplatin-Taxol regimen: (KAR-boh-pla-tin-TAK-sol REH-jih-men)
    Pronunciation of dictionary term "carboplatin-Taxol regimen"
    A chemotherapy combination used to treat endometrial, ovarian, and head and neck cancers, and non-small cell lung cancer that has spread. It includes the drugs carboplatin and paclitaxel (Taxol). Also called Carbo-Tax regimen, carboplatin-Taxol, and PC regimen.
  carboplatin-Taxol-bevacizumab regimen: (KAR-boh-pla-tin-TAK-sol-beh-vuh-SIH-zoo-mab REH-jih-men)
    Pronunciation of dictionary term "carboplatin-Taxol-bevacizumab regimen"
    A chemotherapy combination used to treat advanced, nonsquamous non-small cell lung cancer. It includes the drugs carboplatin, paclitaxel (Taxol), and bevacizumab. Also called carboplatin-paclitaxel-bevacizumab regimen.
  carboxyamidotriazole: (kar-BOK-see-uh-MEE-doh-TRY-uh-zole)
    Pronunciation of dictionary term "carboxyamidotriazole"
    An anticancer drug that belongs to the family of drugs called angiogenesis inhibitors.
  carboxypeptidase-G2: (kar-BOK-see-PEP-tih-days …)
    Pronunciation of dictionary term "carboxypeptidase-G2"
    A drug used to treat toxic levels of the anticancer drug methotrexate in the blood of adults and children with kidney problems. Carboxypeptidase-G2 is a bacterial enzyme that helps break down and remove methotrexate from the body. It may also help certain drugs kill cancer cells. Carboxypeptidase-G2 is a type of chemoprotective agent and a type of prodrug activator. Also called glucarpidase and Voraxaze.
    More Information
    - Glucarpidase (https://www.cancer.gov/about-cancer/treatment/drugs/glucarpidase)
  carcinoembryonic antigen: (KAR-sih-noh-EM-bree-AH-nik AN-tih-jen)
    Pronunciation of dictionary term "carcinoembryonic antigen"
    A substance that may be found in the blood of people who have colon cancer, other types of cancer or diseases, or who smoke tobacco. Carcinoembryonic antigen levels may help keep track of how well cancer treatments are working or if cancer has come back. It is a type of tumor marker. Also called CEA.
  carcinoembryonic antigen assay: (KAR-sih-noh-EM-bree-AH-nik AN-tih-jen A-say)
    Pronunciation of dictionary term "carcinoembryonic antigen assay"
    A laboratory test that measures the level of carcinoembryonic antigen (CEA) in the blood. An increased amount of CEA may be found in the blood of people who have colon cancer or other types of cancer, certain other diseases, or who smoke. The amount of CEA in the blood may also help keep track of how well cancer treatments are working or if cancer has come back. CEA is a type of tumor marker. Also called CEA assay.
  carcinoembryonic antigen peptide-1: (KAR-sih-noh-EM-bree-AH-nik AN-tih-jen PEP-tide-1)
    Pronunciation of dictionary term "carcinoembryonic antigen peptide-1"
    A small piece of a tumor marker called carcinoembryonic antigen (CEA). CEA may be found in the blood of people who have colon cancer, other types of cancer or diseases, or who smoke tobacco. Carcinoembryonic antigen peptide-1 is used to make a vaccine that may help stimulate the body’s immune system to kill cancer cells. Also called CAP-1 and CEA peptide-1.
  carcinogen: (kar-SIH-noh-jin)
    Pronunciation of dictionary term "carcinogen"
    Any substance that causes cancer.
  carcinogenesis: (KAR-sih-noh-JEH-neh-sis)
    Pronunciation of dictionary term "carcinogenesis"
    The process by which normal cells are transformed into cancer cells.
  carcinoid syndrome: (KAR-sih-noyd SIN-drome)
    Pronunciation of dictionary term "carcinoid syndrome"
    A combination of symptoms caused by the release of serotonin and other substances from carcinoid tumors of the gastrointestinal tract. Symptoms may include flushing of the face, flat angiomas (small collections of dilated blood vessels) of the skin, diarrhea, bronchial spasms, rapid pulse, and sudden drops in blood pressure.
  carcinoid tumor: (KAR-sih-noyd TOO-mer)
    Pronunciation of dictionary term "carcinoid tumor"
    A slow-growing type of tumor usually found in the gastrointestinal system (most often in the small intestine and rectum), and sometimes in the lungs or other sites. Carcinoid tumors may spread to the liver or other sites in the body, and they may secrete substances such as serotonin or prostaglandins, causing carcinoid syndrome.
  carcinoma: (KAR-sih-NOH-muh)
    Pronunciation of dictionary term "carcinoma"
    Cancer that begins in the skin or in tissues that line or cover internal organs.
  carcinoma in situ: (KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "carcinoma in situ"
    A condition in which abnormal cells that look like cancer cells under a microscope are found only in the place where they first formed and haven’t spread to nearby tissue. At some point, these cells may become cancerous and spread into nearby normal tissue. There are many different types of carcinoma in situ depending on the type of tissue in which it began. These include adenocarcinoma in situ (of the cervix, lungs, and gastrointestinal tract), ductal carcinoma in situ (of the breast), and squamous cell carcinoma in situ (of the skin, mouth, and larynx). Also called stage 0 disease.
    Carcinoma in situ (CIS) is a group of abnormal cells that are found only in the place where they first formed in the body (see left panel). These abnormal cells may become cancer and spread to nearby normal tissue (see right panel).
    Two-panel drawing showing layers of tissue, including the outer tissue layer, muscle layers, connective tissue, and inner tissue layer. The left panel shows carcinoma in situ (abnormal cells) in the inner tissue layer. The right panel shows cancer cells spreading from the inner tissue layer to the connective tissue and muscle layers.
  carcinoma of unknown primary: (KAR-sih-NOH-muh ... UN-none PRY-mayr-ee)
    Pronunciation of dictionary term "carcinoma of unknown primary"
    A case in which cancer cells are found in the body, but the place where the cells first started growing (the origin or primary site) cannot be determined. Also called cancer of unknown primary origin and CUP.
    More Information
    - Carcinoma of Unknown Primary (https://www.cancer.gov/types/unknown-primary)
    In cancer of unknown primary, cancer cells have spread in the body but the place where the primary cancer began is not known.
    Cancer of unknown primary; drawing shows a primary tumor that has spread from an unknown site to other parts of the body (the lung and the brain). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph systems, to another part of the body where a metastatic tumor has formed.
  carcinomatosis: (KAR-sih-NOH-muh-TOH-sis)
    Pronunciation of dictionary term "carcinomatosis"
    A serious condition in which cancer cells from an original (primary) tumor spread to form many tumors throughout the body or to a large area of the body. In most cases, carcinomatosis is a sign that the cancer is getting worse and cannot be cured. The most common types of carcinomatosis are leptomeningeal carcinomatosis (affects the thin layers of tissue that cover and protect the brain and spinal cord), lymphangitic carcinomatosis (usually affects the lungs), and peritoneal carcinomatosis (affects the tissue that lines the abdominal wall and covers most of the organs in the abdomen). Also called carcinosis.
  carcinomatous lymphangitis: (KAR-sih-NOH-muh-tus LIM-fan-JY-tis)
    Pronunciation of dictionary term "carcinomatous lymphangitis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the lymph vessels (the thin tubes that carry lymph and white blood cells through the body’s lymph system). The cancer cells build up in the lymph vessels, which causes them to become blocked. Carcinomatous lymphangitis usually occurs in the lungs. It can happen in many types of cancer, but it is most common in people with cancers of the breast, lung, colon, stomach, pancreas, or prostate. Also called lymphangitic carcinomatosis.
  carcinomatous meningitis: (KAR-sih-NOH-muh-tus MEH-nin-JY-tis)
    Pronunciation of dictionary term "carcinomatous meningitis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Carcinomatous meningitis can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called leptomeningeal carcinoma, leptomeningeal carcinomatosis, leptomeningeal metastasis, meningeal carcinomatosis, meningeal metastasis, and neoplastic meningitis.
  carcinosarcoma: (KAR-sih-noh-sar-KOH-muh)
    Pronunciation of dictionary term "carcinosarcoma"
    A malignant tumor that is a mixture of carcinoma (cancer of epithelial tissue, which is skin and tissue that lines or covers the internal organs) and sarcoma (cancer of connective tissue, such as bone, cartilage, and fat).
  carcinosis: (KAR-sih-noh-sis)
    Pronunciation of dictionary term "carcinosis"
    A serious condition in which cancer cells from an original (primary) tumor spread to form many tumors throughout the body or to a large area of the body. In most cases, carcinosis is a sign that the cancer is getting worse and cannot be cured. The most common types of carcinosis are leptomeningeal carcinomatosis (affects the thin layers of tissue that cover and protect the brain and spinal cord), lymphangitic carcinomatosis (usually affects the lungs), and peritoneal carcinomatosis (affects the tissue that lines the abdominal wall and covers most of the organs in the abdomen). Also called carcinomatosis.
  carcinostatic: (KAR-sih-noh-STAT-ik)
    Pronunciation of dictionary term "carcinostatic"
    Pertaining to slowing or stopping the growth of cancer.
  cardia: (KAR-dee-uh)
    Pronunciation of dictionary term "cardia"
    The part of the stomach that is closest to the esophagus. Food and liquids pass through the cardia to enter the stomach from the esophagus. A valve near the cardia helps keep stomach contents from backing up into the esophagus.
    The stomach is an organ in the upper abdomen. It can be divided into the cardia and the non-cardia, which includes the fundus, the body, the antrum, and the pylorus. The stomach is part of the digestive system.
    Drawing of the stomach showing the cardia, the fundus, the body, the antrum, and the pylorus.
  cardiac: (KAR-dee-ak)
    Pronunciation of dictionary term "cardiac"
    Having to do with the heart.
  cardiac catheterization: (KAR-dee-ak KA-theh-ter-rih-ZAY-shun)
    Pronunciation of dictionary term "cardiac catheterization"
    A procedure used to diagnose and treat some heart conditions. During cardiac catheterization, a flexible tube called a catheter is inserted into a blood vessel in the arm, groin, upper thigh, or neck. The catheter is then guided through the aorta into the heart using a special x-ray machine. A cardiac catheterization may be done to measure blood pressure and oxygen levels in different parts of the heart, to check how well the heart muscle is working, to take a sample of tissue from the heart, or to look for defects in the valves or chambers of the heart. A dye may be injected through the catheter in order to look at blood flow in the heart and to check for blockages in the arteries leading to the heart.
  cardiac pacemaker: (KAR-dee-ak PAYS-may-ker)
    Pronunciation of dictionary term "cardiac pacemaker"
    An electronic device that is implanted in the body to monitor heart rate and rhythm. It gives the heart electrical stimulation when it does not beat normally. It runs on batteries and has long, thin wires that connect it to the heart. Also called artificial pacemaker and pacemaker.
  cardiac sarcoma: (KAR-dee-ak sar-KOH-muh)
    Pronunciation of dictionary term "cardiac sarcoma"
    A rare cancer that develops in tissues of the heart. Also called heart cancer.
  cardiac tamponade: (KAR-dee-ak tam-puh-NAYD)
    Pronunciation of dictionary term "cardiac tamponade"
    A serious condition that occurs when extra fluid or blood builds up in the space between the heart and the pericardium (the sac around the heart). The extra fluid causes pressure on the heart, which keeps it from pumping enough blood to the rest the body. Cardiac tamponade is life-threatening and can lead to shock and organ failure if not treated right away. It may be caused by cancer, infection, chest injury, heart surgery, radiation therapy to the chest, autoimmune disease, and heart, thyroid, or kidney problems. Also called pericardial tamponade.
  cardin: (KAR-din)
    Pronunciation of dictionary term "cardin"
    A plant whose leaves, stems, and flowers have been used in some cultures to treat certain medical problems. Cardin may have anti-inflammatory and anticancer effects. The scientific name is Cnicus benedictus. Also called blessed thistle, holy thistle, spotted thistle, and St. Benedict's thistle.
  cardiofaciocutaneous syndrome: (KAR-dee-oh-FAY-shee-oh-kyoo-TAY-nee-us SIN-drome)
    Pronunciation of dictionary term "cardiofaciocutaneous syndrome"
    A rare genetic condition that affects many parts of the body, especially the heart, face, and skin. People with cardiofaciocutaneous syndrome usually have growth, developmental, and learning delays. Other signs and symptoms include heart defects, an abnormally large head, unusual facial features, and problems with the skin, eyes, and the gastrointestinal and nervous systems. People with cardiofaciocutaneous syndrome may also have thin, dry, curly hair and sparse or no eyelashes or eyebrows. Cardiofaciocutaneous syndrome is a type of disease called a RASopathy that is caused by mutations (changes) in the BRAF, MAP2K1, MAP2K2, or KRAS gene. These genes make proteins involved in a cell signaling pathway that controls many important cell functions. Also called CFC syndrome.
  cardiologist: (KAR-dee-AH-loh-jist)
    Pronunciation of dictionary term "cardiologist"
    A doctor who has special training to diagnose and treat diseases of the heart and blood vessels.
  cardiology: (KAR-dee-AH-loh-jee)
    Pronunciation of dictionary term "cardiology"
    A branch of medicine that specializes in diagnosing and treating diseases of the heart, blood vessels, and circulatory system. These diseases include coronary artery disease, heart rhythm problems, and heart failure.
  cardiopulmonary: (KAR-dee-oh-PUL-muh-NAYR-ee)
    Pronunciation of dictionary term "cardiopulmonary"
    Having to do with the heart and lungs.
    More Information
    - Cardiopulmonary Syndromes
  cardiopulmonary resuscitation: (KAR-dee-oh-PUL-muh-NAYR-ee ree-SUH-sih-TAY-shun)
    Pronunciation of dictionary term "cardiopulmonary resuscitation"
    An emergency procedure used to restart a person’s heartbeat and breathing after one or both have stopped. It involves giving strong, rapid pushes to the chest to keep blood moving through the body. Usually, it also involves blowing air into the person’s mouth to help with breathing and send oxygen to the lungs. Also called CPR.
  cardiotoxicity: (KAR-dee-oh-tok-SIH-sih-tee)
    Pronunciation of dictionary term "cardiotoxicity"
    Toxicity that affects the heart.
  cardiovascular: (KAR-dee-oh-VAS-kyoo-ler)
    Pronunciation of dictionary term "cardiovascular"
    Having to do with the heart and blood vessels.
  cardiovascular disease: (KAR-dee-oh-VAS-kyoo-ler dih-ZEEZ)
    Pronunciation of dictionary term "cardiovascular disease"
    A type of disease that affects the heart or blood vessels. The risk of certain cardiovascular diseases may be increased by smoking, high blood pressure, high cholesterol, unhealthy diet, lack of exercise, and obesity. The most common cardiovascular disease is coronary artery disease (narrow or blocked coronary arteries), which can lead to chest pain, heart attacks, or stroke. Other cardiovascular diseases include congestive heart failure, heart rhythm problems, congenital heart disease (heart disease at birth), and endocarditis (inflamed inner layer of the heart). Also called heart disease.
  Cardura: (kar-DOO-ruh)
    Pronunciation of dictionary term "Cardura"
    A drug used to treat high blood pressure and urinary problems caused by an enlarged prostate. It relaxes muscle tissue in blood vessels and in the prostate. Cardura is a type of alpha blocker. Also called doxazosin mesylate.
  caregiver: (KAYR-gih-ver)
    Pronunciation of dictionary term "caregiver"
    A person who gives care to people who need help taking care of themselves. Examples include children, the elderly, or patients who have chronic illnesses or are disabled. Caregivers may be health professionals, family members, friends, social workers, or members of the clergy. They may give care at home or in a hospital or other health care setting.
    More Information
    - Informal Caregivers in Cancer
    - Support for Caregivers of Cancer Patients (https://www.cancer.gov/about-cancer/coping/caregiver-support)
  carfilzomib: (kar-FIL-zoh-mib)
    Pronunciation of dictionary term "carfilzomib"
    A drug used alone or with other drugs to treat adults with multiple myeloma that came back or did not get better after treatment with one or more other therapies. It is also being studied in the treatment of other types of cancer. Carfilzomib blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called Kyprolis.
    More Information
    - Carfilzomib (https://www.cancer.gov/about-cancer/treatment/drugs/carfilzomib)
  carina of trachea: (kuh-RY-nuh ... TRAY-kee-uh)
    Pronunciation of dictionary term "carina of trachea"
    A ridge at the base of the trachea (windpipe) that separates the openings of the right and left main bronchi (the large air passages that lead from the trachea to the lungs). Also called tracheal carina.
  carmustine: (kar-MUS-teen)
    Pronunciation of dictionary term "carmustine"
    A drug used alone or with other drugs to treat certain types of brain tumors, Hodgkin lymphoma, and non-Hodgkin lymphoma and with prednisone to treat multiple myeloma. It is also being studied in the treatment of other types of cancer. Carmustine damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea. Also called BCNU and BiCNU.
    More Information
    - Carmustine (https://www.cancer.gov/about-cancer/treatment/drugs/carmustine)
  carmustine implant: (kar-MUS-teen IM-plant)
    Pronunciation of dictionary term "carmustine implant"
    A drug used with surgery and radiation therapy to treat high-grade glioma that has not already been treated and with surgery to treat glioblastoma multiforme that has recurred (come back). Carmustine implant is a form of carmustine contained in a wafer. The wafer has a coating that dissolves slowly and releases carmustine directly into the area where the brain tumor was removed. This form may have fewer side effects and work better than other forms of carmustine. Carmustine implant is a type of alkylating agent and a type of nitrosourea. Also called Gliadel Wafer and polifeprosan 20 carmustine implant.
    More Information
    - Carmustine Implant (https://www.cancer.gov/about-cancer/treatment/drugs/carmustineimplant)
  Carney complex: (KAR-nee KOM-plex)
    Pronunciation of dictionary term "Carney complex"
    A rare, inherited disorder marked by dark spots on the skin and tumors in the heart, endocrine glands, skin, and nerves. There are two types of Carney complex, which are caused by mutations (changes) in different genes. Also called Carney syndrome.
    More Information
    - Carney complex (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/1119/carney-complex)
    - Carney complex (MedlinePlus) (https://medlineplus.gov/genetics/condition/carney-complex/)
  Carney dyad: (KAR-nee DY-ad)
    Pronunciation of dictionary term "Carney dyad"
    A rare, inherited disorder marked by tumors of the gastrointestinal tract and tumors that form in embryonic nervous tissue in the head, neck, and torso. Also called Carney-Stratakis dyad and Carney-Stratakis syndrome.
    More Information
    - Paraganglioma and gastric stromal sarcoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10643/carney-dyad)
  Carney syndrome: (KAR-nee SIN-drome)
    Pronunciation of dictionary term "Carney syndrome"
    A rare, inherited disorder marked by dark spots on the skin and tumors in the heart, endocrine glands, skin, and nerves. There are two types of Carney syndrome, which are caused by mutations (changes) in different genes. Also called Carney complex.
    More Information
    - Carney complex (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/1119/carney-complex)
    - Carney complex (MedlinePlus) (https://medlineplus.gov/genetics/condition/carney-complex/)
  Carney triad: (KAR-nee TRY-ad)
    Pronunciation of dictionary term "Carney triad"
    A very rare disorder marked by tumors of the gastrointestinal tract (usually the stomach), tumors that form in embryonic nervous tissue in the head, neck, and torso, and tumors that form in cartilage in the lungs. Sometimes tumors also form in the adrenal glands and esophagus. Carney triad is most common in young females.
    More Information
    - Carney complex (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/1119/carney-complex)
    - Carney complex (MedlinePlus) (https://medlineplus.gov/genetics/condition/carney-complex/)
  Carney-Stratakis dyad: (KAR-nee-STRA-tuh-kis DY-ad)
    Pronunciation of dictionary term "Carney-Stratakis dyad"
    A rare, inherited disorder marked by tumors of the gastrointestinal tract and tumors that form in embryonic nervous tissue in the head, neck, and torso. Also called Carney dyad and Carney-Stratakis syndrome.
    More Information
    - Paraganglioma and gastric stromal sarcoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10643/carney-dyad)
  Carney-Stratakis syndrome: (KAR-nee-STRA-tuh-kis SIN-drome)
    Pronunciation of dictionary term "Carney-Stratakis syndrome"
    A rare, inherited disorder marked by tumors of the gastrointestinal tract and tumors that form in embryonic nervous tissue in the head, neck, and torso. Also called Carney dyad and Carney-Stratakis dyad.
    More Information
    - Paraganglioma and gastric stromal sarcoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10643/carney-dyad)
  carnitine: (KAR-nih-teen)
    Pronunciation of dictionary term "carnitine"
    A substance made in the muscle and liver tissue and found in certain foods, such as meat, poultry, fish, and some dairy products. It is used by many cells in the body to make energy from fatty acids.
  Carnitor: (KAR-nih-tor)
    Pronunciation of dictionary term "Carnitor"
    A form of carnitine, which is a substance made in muscle and liver tissue and found in certain foods, such as meat, poultry, fish, and some dairy products. Carnitor is also a drug that is used to treat patients who do not make enough carnitine and is being studied as a way to prevent tissue damage caused by chemotherapy. Carnitine is a type of dietary supplement. Also called L-carnitine and levocarnitine.
  carotenoid: (kuh-RAH-teh-noyd)
    Pronunciation of dictionary term "carotenoid"
    A yellow, red, or orange substance found mostly in plants, including carrots, sweet potatoes, dark green leafy vegetables, and many fruits, grains, and oils. Some carotenoids are changed into vitamin A in the body and some are being studied in the prevention of cancer. A carotenoid is a type of antioxidant and a type of provitamin.
  carotid artery: (kuh-RAH-tid AR-tuh-ree)
    Pronunciation of dictionary term "carotid artery"
    A major artery that carries blood from the heart to the head. There is a carotid artery on each side of the neck, and each one splits into two branches. The interior branch carries blood to the brain and eyes, and the exterior branch carries blood to the face, tongue, and outside parts of the head.
  carrier: (KAYR-ee-er)
    Pronunciation of dictionary term "carrier"
    In genetics, a person who has one copy of a mutated (changed) disease-causing gene but has no symptoms or mild symptoms. Carriers can pass on the mutated gene to a biological child. If a child inherits one mutated copy of a gene from each parent, they will usually show symptoms of the disease or condition.
    More Information
    - Carrier (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=23)
  carrier oil: (KAYR-ee-er oyl)
    Pronunciation of dictionary term "carrier oil"
    An oil with little or no scent that is used to dilute or “carry” essential oils (scented liquid taken from plants).
  cART: Treatment that uses a combination of three or more drugs to treat HIV infection. cART stops the virus from making copies of itself in the body. This may lessen the damage to the immune system caused by HIV and may slow down the development of AIDS. It may also help prevent transmission of HIV to others, including from mother to child during birth. Also called combination antiretroviral therapy, HAART, and highly active antiretroviral therapy.
  cartilage: (KAR-tih-lij)
    Pronunciation of dictionary term "cartilage"
    A tough, flexible tissue that lines joints and gives structure to the nose, ears, larynx, and other parts of the body.
  carvedilol phosphate: (KAR-vuh-DIH-lol FOS-fayt)
    Pronunciation of dictionary term "carvedilol phosphate"
    A drug used to treat high blood pressure and certain heart problems. It is also being studied in the prevention and treatment of side effects caused by some anticancer drugs. Carvedilol phosphate blocks certain receptors on nerve cells and causes blood vessels to dilate (widen). It is a type of antihypertensive agent and a type of antianginal agent. Also called Coreg.
  Carvykti: (car-VIK-tee)
    Pronunciation of dictionary term "Carvykti"
    A treatment used for adults with multiple myeloma that came back or did not get better after treatment with at least one line of anticancer therapy that included a proteasome inhibitor and an immunomodulating agent. It is used in patients whose cancer did not respond to treatment with lenalidomide. Carvykti is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Carvykti binds to a protein called BCMA, which is found on myeloma cells and some types of immune cells. This helps the body’s immune system kill cancer cells. Carvykti is a type of cellular immunotherapy called CAR T-cell therapy. Also called ciltacabtagene autoleucel.
    More Information
    - Ciltacabtagene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/ciltacabtagene-autoleucel)
  carzelesin: (kar-ZEH-leh-sin)
    Pronunciation of dictionary term "carzelesin"
    An anticancer drug that belongs to the family of drugs called alkylating agents.
  case management nurse: (... MA-nij-ment ...)
    Pronunciation of dictionary term "case management nurse"
    A registered nurse who has special training in how to plan, manage, and evaluate all aspects of patient care, especially for patients who get treatment over a long time. Also called nurse case manager.
  case report: (kays reh-PORT)
    Pronunciation of dictionary term "case report"
    A detailed report of the diagnosis, treatment, and follow-up of an individual patient. Case reports also contain some demographic information about the patient (for example, age, gender, ethnic origin).
  case series: (kays SEER-eez)
    Pronunciation of dictionary term "case series"
    A group or series of case reports involving patients who were given similar treatment. Reports of case series usually contain detailed information about the individual patients. This includes demographic information (for example, age, gender, ethnic origin) and information on diagnosis, treatment, response to treatment, and follow-up after treatment.
  case-control study: (kays-kun-TROLE STUH-dee)
    Pronunciation of dictionary term "case-control study"
    A study that compares two groups of people: those with the disease or condition under study (cases) and a very similar group of people who do not have the disease or condition (controls). Researchers study the medical and lifestyle histories of the people in each group to learn what factors may be associated with the disease or condition. For example, one group may have been exposed to a particular substance that the other was not. Also called retrospective study.
  Casodex: (KA-soh-dex)
    Pronunciation of dictionary term "Casodex"
    A drug used with another drug to treat prostate cancer that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Casodex binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Casodex blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called bicalutamide.
    More Information
    - Bicalutamide (https://www.cancer.gov/about-cancer/treatment/drugs/bicalutamide)
  caspofungin acetate: (KAS-poh-fun-jin A-seh-tayt)
    Pronunciation of dictionary term "caspofungin acetate"
    A drug used to prevent or treat infections caused by a fungus (a type of microorganism). It belongs to the family of drugs called antifungal agents.
  Castleman disease: (KA-sel-man dih-ZEEZ)
    Pronunciation of dictionary term "Castleman disease"
    A rare disorder in which benign (not cancer) growths form in lymph node tissue. There are two main ways that Castleman disease occurs: localized (unicentric) and multicentric. Unicentric Castleman disease affects only one group of lymph nodes in one part of the body, usually in the chest or abdomen. It may not cause symptoms. Multicentric Castleman disease affects many groups of lymph nodes and lymphoid tissue all through the body. It can weaken the immune system and cause problems such as infection, fever, weight loss, fatigue, night sweats, nerve damage, and anemia. People with Castleman disease have an increased risk of lymphoma. Also called angiofollicular lymph node hyperplasia and giant lymph node hyperplasia.
  castrate-resistant prostate cancer: (KAS-trayt-reh-ZIH-stunt PROS-tayt KAN-ser)
    Pronunciation of dictionary term "castrate-resistant prostate cancer"
    Prostate cancer that keeps growing even when the amount of testosterone in the body is reduced to very low levels. Many early-stage prostate cancers need normal levels of testosterone to grow, but castrate-resistant prostate cancers do not. Also called CRPC.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  castrate-sensitive prostate cancer: (KAS-trayt-SEN-sih-tiv PROS-tayt KAN-ser)
    Pronunciation of dictionary term "castrate-sensitive prostate cancer"
    Prostate cancer that needs androgens (male hormones) to grow and therefore stops growing when androgens are not present. Many early-stage prostate cancers are androgen-dependent, so reducing the amount of androgens in the body or blocking their action may be an effective type of therapy. Also called androgen-dependent prostate cancer, androgen-sensitive prostate cancer, CSPC, hormone-sensitive prostate cancer, and HSPC.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  castration: (kas-TRAY-shun)
    Pronunciation of dictionary term "castration"
    Removal or destruction of the testicles or ovaries using radiation, surgery, or drugs. Medical castration refers to the use of drugs to suppress the function of the ovaries or testicles.
  CaT regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CaT regimen"
    A chemotherapy combination used to treat endometrial, ovarian, and head and neck cancers, and non-small cell lung cancer that has spread. It includes the drugs carboplatin and paclitaxel (Taxol). Also called Carbo-Tax regimen, carboplatin-Taxol, carboplatin-Taxol regimen, and PC regimen.
  CAT scan: (… skan)
    Pronunciation of dictionary term "CAT scan"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-dimensional (3-D) views of tissues and organs. A dye may be injected into a vein or swallowed to help the tissues and organs show up more clearly. A CAT scan may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called computed tomography scan, computerized axial tomography scan, computerized tomography, and CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
    Computed tomography (CT) scan of the abdomen. The patient lies on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
    Computed tomography (CT) scan of the abdomen; drawing shows the patient on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
  CAT-8015: A drug used to treat adults with hairy cell leukemia that came back or did not get better with at least two other systemic therapies, including treatment with a purine nucleoside analog (a type of anticancer drug). CAT-8015 contains a monoclonal antibody that binds to a protein called CD22, which is found on B cells (a type of white blood cell) and some types of leukemia cells. It also contains a bacterial toxin called PE38, which may help kill cancer cells. CAT-8015 is a type of immunotoxin. Also called anti-CD22 immunotoxin CAT-8015, Lumoxiti, and moxetumomab pasudotox.
    More Information
    - Moxetumomab Pasudotox-tdfk
  Catapres: (KA-tuh-pres)
    Pronunciation of dictionary term "Catapres"
    A drug used to treat high blood pressure. It is also being studied in the treatment of certain types of cancer pain and as an aid to stop smoking. It blocks the release of chemicals from nerve endings that make blood vessels constrict (get narrower). Catapres is a type of antihypertensive agent and a type of alpha-adrenergic agonist. Also called clonidine hydrochloride.
  cataract: (KA-tuh-RAKT)
    Pronunciation of dictionary term "cataract"
    A condition in which the lens of the eye becomes cloudy. Symptoms include blurred, cloudy, or double vision; sensitivity to light; and difficulty seeing at night. Without treatment, cataracts can cause blindness. There are many different types and causes of cataracts. They may occur in people of all ages, but are most common in the elderly.
  catch-up vaccination: (… VAK-sih-NAY-shun)
    Pronunciation of dictionary term "catch-up vaccination"
    The practice of giving a vaccine to people who did not receive it at the recommended age. Catch-up vaccines may be given to a person who has not been previously vaccinated, who has missed a scheduled vaccine dose, or who has not completed a vaccine series. They may also be given to some people, such as those with a weakened immune system, who might be at high risk of certain types of infection, such as human papillomavirus (HPV) infection.
  catechin: (KA-teh-kin)
    Pronunciation of dictionary term "catechin"
    A substance found in tea that helps protect cells from damage caused by free radicals. Free radicals are unstable molecules that are made during normal cell metabolism (chemical changes that take place in a cell). They can build up in cells and cause damage to other molecules. This damage may increase the risk of cancer and other diseases. Catechins are being studied in the prevention and treatment of cancer. A catechin is a type of antioxidant.
  catechol: (ka-teh-KOL)
    Pronunciation of dictionary term "catechol"
    A chemical originally isolated from a type of mimosa tree. Catechol is used as an astringent, an antiseptic, and in photography, electroplating, and making other chemicals. It can also be made in the laboratory.
  catecholamine: (ka-teh-KOH-luh-meen)
    Pronunciation of dictionary term "catecholamine"
    A type of neurohormone (a chemical that is made by nerve cells and used to send signals to other cells). Catecholamines are important in stress responses. High levels cause high blood pressure which can lead to headaches, sweating, pounding of the heart, pain in the chest, and anxiety. Examples of catecholamines include dopamine, epinephrine (adrenaline), and norepinephrine (noradrenaline).
  catheter: (KA-theh-ter)
    Pronunciation of dictionary term "catheter"
    A flexible tube used to deliver fluids into or withdraw fluids from the body.
  cause-specific survival: (kawz-speh-SIH-fik ser-VY-vul)
    Pronunciation of dictionary term "cause-specific survival"
    The length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, to the date of death from the disease. Patients who die from causes unrelated to the disease are not counted in this measurement. In a clinical trial, measuring the cause-specific survival is one way to see how well a new treatment works. Also called CSS.
  cauterize: (KAW-teh-RIZE)
    Pronunciation of dictionary term "cauterize"
    To destroy tissue using a hot or cold instrument, an electrical current, or a chemical that burns or dissolves the tissue. This process may be used to kill certain types of small tumors or to seal off blood vessels to stop bleeding.
  cavity: (KA-vih-tee)
    Pronunciation of dictionary term "cavity"
    A hollow area or hole. It may describe a body cavity (such as the space within the abdomen) or a hole in a tooth caused by decay.
  CBC: A measure of the number of red blood cells, white blood cells, and platelets in the blood. The amount of hemoglobin (substance in the blood that carries oxygen) and the hematocrit (the amount of whole blood that is made up of red blood cells) are also measured. A CBC is used to help diagnose and monitor many conditions. Also called blood cell count, complete blood count, and full blood count.
    Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
    Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
  CBC with differential: (… dih-feh-REN-shul)
    Pronunciation of dictionary term "CBC with differential"
    A measure of the number of red blood cells, white blood cells, and platelets in the blood, including the different types of white blood cells (neutrophils, lymphocytes, monocytes, basophils, and eosinophils). The amount of hemoglobin (substance in the blood that carries oxygen) and the hematocrit (the amount of whole blood that is made up of red blood cells) are also measured. A CBC with differential is used to help diagnose and monitor many different conditions, including anemia and infection. Also called blood cell count with differential.
  CBD: A chemical that comes from the hemp (Cannabis sativa) plant. CBD contains very low levels of delta-9-THC (the main chemical that causes the “high” of marijuana). It may help relieve pain, lower inflammation, and reduce anxiety without causing the mind-altering effects of marijuana. CBD comes in many forms, including oils, extracts, capsules, and patches. One specific form has been approved in the United States as a drug to treat seizures in certain people. CBD is also being studied in the treatment of symptoms or side effects caused by cancer and cancer treatment. It is a type of cannabinoid. Also called cannabidiol.
    More Information
    - Cannabis and Cannabinoids
  CBE: A physical exam of the breast performed by a health care provider to check for lumps or other changes. Also called clinical breast exam.
    More Information
    - Breast Cancer Screening
  CBT: A type of psychotherapy that helps patients change their behavior by changing the way they think and feel about certain things. It is used to treat mental, emotional, personality, and behavioral disorders. Also called cognitive behavior therapy and cognitive therapy.
  CBT-1: A substance taken from plants that is being studied in the treatment of cancer. It may help drugs kill tumor cells that have become resistant to drugs. It is a type of multidrug resistance inhibitor and a type of P-glycoprotein antagonist. Also called MDR modulator CBT-1.
  cc: A measure of volume in the metric system. One thousand ccs equal one liter. Also called cubic centimeter, milliliter, and mL.
  CC-1088: A drug that is being studied in the treatment of cancer. It is similar but not identical to thalidomide. CC-1088 belongs to the family of drugs called angiogenesis inhibitors.
  CC-4047: A drug that is similar to thalidomide and is used alone or with other drugs to treat adults with certain types of multiple myeloma or Kaposi sarcoma. It is also being studied in the treatment of other types of cancer. CC-4047 may help the immune system kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. CC-4047 is a type of immunomodulating agent and a type of antiangiogenesis agent. Also called pomalidomide and Pomalyst.
    More Information
    - Pomalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/pomalidomide)
  CC-49: A type of monoclonal antibody used in cancer detection or therapy. Monoclonal antibodies are laboratory-produced substances that can locate and bind to cancer cells.
  CC-5013: A drug that is similar to thalidomide and is used alone or with other drugs to treat adults with certain types of follicular lymphoma, marginal zone lymphoma, mantle cell lymphoma, multiple myeloma, or anemia caused by certain types of myelodysplastic syndromes. It is also being studied in the treatment of other conditions and types of cancer. CC-5013 may help the immune system kill abnormal blood cells or cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. CC-5013 is a type of antiangiogenesis agent and a type of immunomodulating agent. Also called lenalidomide and Revlimid.
    More Information
    - Lenalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/lenalidomide)
  CC-8490: A substance that is being studied in the treatment of brain cancer. It belongs to the family of drugs called benzopyrans.
  CC49-streptavidin: (… strep-TA-vih-din)
    Pronunciation of dictionary term "CC49-streptavidin"
    A substance that is being studied in the treatment of cancer. It is made by combining the monoclonal antibody CC49 with a chemical called streptavidin. It can find tumor cells that have the protein TAG-72 on their surface, including colon, prostate, breast, and ovary cancer cells. After CC49-streptavidin binds to cancer cells, a radioactive compound called yttrium Y 90 DOTA-biotin will find those cells and kill them.
  CCDI: A large effort led by the National Cancer Institute to collect, analyze, and share information to address the burden of cancer in children, adolescents, and young adults. The three main goals of CCDI are: (1) to collect data from every child, adolescent, and young adult diagnosed with cancer, (2) to create a national strategy of clinical and molecular testing to speed diagnosis and inform treatment for all types of childhood cancer, and (3) to develop a network of computer systems and programs that merge clinical care and research data to improve prevention, treatment, quality of life, and survivorship for childhood cancers. Also called Childhood Cancer Data Initiative.
    More Information
    - Childhood Cancer Data Initiative (CCDI) (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative)
  CCI-779: A drug used to treat advanced renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. CCI-779 blocks a protein called mTOR, which helps control cell division. Blocking this protein may help keep cancer cells from growing. CCI-779 is a type of kinase inhibitor. Also called temsirolimus and Torisel.
    More Information
    - Temsirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/temsirolimus)
  cCLB8: A drug used to treat a rare condition called multicentric Castleman disease in patients who do not have HIV or human herpesvirus 8. It is also being studied in the treatment of some types of cancer and other conditions. CCLB8 binds to a protein called interleukin-6 (IL-6), which is made by some white blood cells and other cells in the body. CCLB8 may help reduce inflammation and stop the growth of cancer cells or abnormal blood cells. It is a type of monoclonal antibody. Also called anti-IL-6 chimeric monoclonal antibody, CNTO 328, siltuximab, and Sylvant.
    More Information
    - Siltuximab (https://www.cancer.gov/about-cancer/treatment/drugs/siltuximab)
  CCNU: A drug used to treat brain tumors that have already been treated with surgery or radiation therapy and Hodgkin lymphoma that got worse after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. CCNU damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea. Also called Gleostine and lomustine.
    More Information
    - Lomustine (https://www.cancer.gov/about-cancer/treatment/drugs/lomustine)
  ccRCC: A type of kidney cancer in which the cells look clear or very pale when viewed under a microscope. ccRCC begins in cells that line tiny tubes in the kidney. These tubes return filtered nutrients, fluids, and other substances that the body needs back to the blood. ccRCC is the most common type of kidney cancer in adults. People with an inherited condition called von Hippel-Lindau syndrome are at an increased risk of developing ccRCC. Also called clear cell renal cell cancer, clear cell renal cell carcinoma, and conventional renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    - Clear Cell Renal Cell Carcinoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-kidney-tumors/clear-cell-renal-cell-carcinoma)
  CCSG: Funds awarded to certain U.S. institutions by the National Cancer Institute (NCI) for them to become cancer centers in the United States, based on scientific merit. The funds help the cancer centers improve the way they are run and develop new ways to prevent, diagnose, and treat cancer. To receive the award, one goal of the cancer center must be to turn clinical and basic research into better health care. Also called P30 Cancer Center Support Grant.
  CD117: A protein found on the surface of many different types of cells. It binds to a substance called stem cell factor (SCF), which causes certain types of blood cells to grow. CD117 may also be found in higher than normal amounts, or in a changed form, on some types of cancer cells, including gastrointestinal stromal tumors and melanoma. Measuring the amount of CD117 in tumor tissue may help diagnose cancer and plan treatment. CD117 is a type of receptor tyrosine kinase and a type of tumor marker. Also called c-kit and stem cell factor receptor.
  CD134: A protein being studied in the treatment of cancer. Substances that attach to CD134 on the surface of T cells (a type of white blood cell) may help the T cells grow and kill more cancer cells. CD134 is a type of tumor necrosis factor (TNF) receptor. Also called OX-40.
  CD20: A protein found on B cells (a type of white blood cell). It may be found in higher than normal amounts in patients with certain types of B-cell lymphomas and leukemias. Measuring the amount of CD20 on blood cells may help to diagnose cancer or plan cancer treatment. CD20 is a type of tumor marker. Also called CD20 antigen.
  CD20 antigen: (... AN-tih-jen)
    Pronunciation of dictionary term "CD20 antigen"
    A protein found on B cells (a type of white blood cell). It may be found in higher than normal amounts in patients with certain types of B-cell lymphomas and leukemias. Measuring the amount of CD20 antigen on blood cells may help to diagnose cancer or plan cancer treatment. CD20 antigen is a type of tumor marker. Also called CD20.
  CD22 positive: (… PAH-zih-tiv)
    Pronunciation of dictionary term "CD22 positive"
    Describes cells that have a protein called CD22 on their surface. CD22 is found mostly on B cells (a type of white blood cell) and controls many important cell functions, including cell signaling, cell adhesion, cell growth, and cell survival. CD22 is also found on many B-cell leukemia and lymphoma cells. Cancer cells that make too much CD22 may grow more quickly. Knowing whether a cancer is CD22 positive may help plan treatment.
  CD30 protein: (… PROH-teen)
    Pronunciation of dictionary term "CD30 protein"
    A protein found on some T cells and B cells (two types of white blood cells). It is a receptor for a protein called tumor necrosis factor, which is involved in cell growth and cell survival. The CD30 protein may be found in higher than normal amounts on some types of cancer cells, including lymphoma cells. Knowing how much CD30 protein is on a patient’s cancer cells may help diagnose cancer and plan treatment. The CD30 protein is a type of tumor necrosis factor receptor and a type of tumor marker.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  CD33 positive: (… PAH-zih-tiv)
    Pronunciation of dictionary term "CD33 positive"
    Describes cells that have a protein called CD33 on their surface. In normal cells, CD33 is involved in cell signaling, cell adhesion, and cell growth. Cancer cells that make too much CD33 may grow more quickly. Knowing whether a cancer is CD33 positive may help plan treatment. Cancers that may be CD33 positive include acute myeloid leukemia and some types of lymphoma.
  CD34 antigen: (... AN-tih-jen)
    Pronunciation of dictionary term "CD34 antigen"
    A protein found on the surface of some bone marrow and blood cells.
  CD4-positive T lymphocyte: (… PAH-zih-tiv … LIM-foh-site)
    Pronunciation of dictionary term "CD4-positive T lymphocyte"
    A type of immune cell that stimulates killer T cells, macrophages, and B cells to make immune responses. A CD4-positive T lymphocyte is a type of white blood cell and a type of lymphocyte. Also called helper T cell.
  CD40-ligand: (... LIH-gund)
    Pronunciation of dictionary term "CD40-ligand"
    A substance that is being studied in the treatment of cancer. It binds to certain immune cells and may suppress cancer growth.
  CD80: A protein found on the surface of some immune system cells, including B cells and monocytes. Cells with CD80 on their surface cause T cells to make substances that help control immune responses. Also called B7-1.
  CDC: A U.S. federal government agency whose mission is to protect public health by preventing and controlling disease, injury, and disability. The CDC promotes healthy behaviors and safe, healthy environments. It keeps track of health trends, tries to find the cause of health problems and outbreaks of disease, and responds to new public health threats. The CDC works with state health departments and other organizations throughout the country and the world to help prevent and control disease. The CDC is part of the U.S. Public Health Service of the Department of Health and Human Services (DHHS). Also called Centers for Disease Control and Prevention.
    More Information
    - Centers for Disease Control and Prevention (https://www.cdc.gov/)
  CDDO: A substance being studied in the treatment of some types of cancer. CDDO may block enzymes involved in inflammation and cancer growth. It is a type of antineoplastic plant product.
  CDK inhibitor AT7519M: (... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "CDK inhibitor AT7519M"
    A substance being studied in the treatment of some types of cancer. CDK inhibitor AT7519M blocks enzymes needed for cells to divide. It is a type of cyclin-dependent kinase inhibitor. Also called AT7519M.
  CDK inhibitor SCH 727965: (… in-HIH-bih-ter …)
    Pronunciation of dictionary term "CDK inhibitor SCH 727965"
    A substance being studied in the treatment of advanced melanoma (a type of skin cancer) and other types of cancer. It blocks cell division and may cause cancer cells to die. It is a type of cyclin-dependent kinase inhibitor. Also called dinaciclib.
  CDK4 gene: (… jeen)
    Pronunciation of dictionary term "CDK4 gene"
    A gene that makes a protein involved in the cell cycle (the process a cell goes through each time it divides). Mutations (changes) in the CDK4 gene may cause cells to divide too quickly or in an uncontrolled way. This may cause abnormal cells, including cancer cells, to grow. CDK4 gene mutations have been found in melanoma and in other types of cancer.
  CDK6 gene: (… jeen)
    Pronunciation of dictionary term "CDK6 gene"
    A gene that makes a protein involved in the cell cycle (the process a cell goes through each time it divides). Mutations (changes) in the CDK6 gene may cause cells to divide too quickly or in an uncontrolled way. This may cause abnormal cells, including cancer cells, to grow. CDK6 gene mutations have been found in some types of cancer.
  CDKN2A gene: (… jeen)
    Pronunciation of dictionary term "CDKN2A gene"
    A gene that makes two major proteins involved in controlling cell growth, cell division, and a type of cell death called apoptosis. Mutations (changes) in the CDKN2A gene may cause cells to grow and divide too quickly or in an uncontrolled way or may keep cells from undergoing apoptosis. This may cause abnormal cells, including cancer cells, to grow. CDKN2A gene mutations have been found in melanoma and in many other types of cancer. The CDKN2A gene is a type of tumor suppressor gene.
    More Information
    - CDKN2A gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/cdkn2a/)
  CEA: A substance that may be found in the blood of people who have colon cancer, other types of cancer or diseases, or who smoke tobacco. CEA levels may help keep track of how well cancer treatments are working or if cancer has come back. It is a type of tumor marker. Also called carcinoembryonic antigen.
  CEA assay: (... A-say)
    Pronunciation of dictionary term "CEA assay"
    A laboratory test that measures the level of carcinoembryonic antigen (CEA) in the blood. An increased amount of CEA may be found in the blood of people who have colon cancer or other types of cancer, certain other diseases, or who smoke. The amount of CEA in the blood may also help keep track of how well cancer treatments are working or if cancer has come back. CEA is a type of tumor marker. Also called carcinoembryonic antigen assay.
  CEA peptide-1: (...PEP-tide-1)
    Pronunciation of dictionary term "CEA peptide-1"
    A small piece of a tumor marker called carcinoembryonic antigen (CEA). CEA may be found in the blood of people who have colon cancer, other types of cancer or diseases, or who smoke tobacco. CEA peptide-1 is used to make a vaccine that may help stimulate the body’s immune system to kill cancer cells. Also called CAP-1 and carcinoembryonic antigen peptide-1.
  cecum: (SEE-kum)
    Pronunciation of dictionary term "cecum"
    A pouch that forms the first part of the large intestine. It connects the small intestine to the colon, which is part of the large intestine.
    The cecum connects the small intestine to the colon. The colon includes the ascending colon, transverse colon, descending colon, and sigmoid colon. The sigmoid colon connects to the rectum and anal canal, which leads to the outside of the body.
    Drawing shows the cecum, ascending colon, transverse colon, descending colon, sigmoid colon, rectum, and anal canal. Also shown is the small intestine.
  cedarwood: (SEE-der-WOOD)
    Pronunciation of dictionary term "cedarwood"
    A type of evergreen tree with hard fragrant wood that is a member of the cypress family. The oil from the wood is used in soaps, shampoos, bath salts, perfumes, aromatherapy, and to keep insects away. The scientific name is Juniperus virginiana. Also called Eastern red cedar and red cedar.
  cediranib maleate: (seh-DEER-uh-nib MAY-lee-AYT)
    Pronunciation of dictionary term "cediranib maleate"
    A substance being studied in the treatment of some types of cancer. Cediranib maleate may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of antiangiogenesis agent and a type of vascular endothelial growth factor (VEGF) receptor tyrosine kinase inhibitor. Also called AZD2171 and Recentin.
  CeeNU: A drug used to treat brain tumors that have already been treated with surgery or radiation therapy. It is also used to treat Hodgkin lymphoma that has not gotten better with other types of treatment or has come back. It is being studied in the treatment of other types of cancer. CeeNU damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent. Also called CCNU and lomustine.
  cefepime: (SEH-feh-peem)
    Pronunciation of dictionary term "cefepime"
    A drug used to treat infection. It belongs to the family of drugs called cephalosporin antibiotics.
  cefixime: (seh-FIK-seem)
    Pronunciation of dictionary term "cefixime"
    An antibiotic drug used to treat infection. It belongs to the family of drugs called cephalosporins.
  ceftriaxone: (SEF-try-AK-sone)
    Pronunciation of dictionary term "ceftriaxone"
    A drug used to treat infection. It belongs to the family of drugs called cephalosporin antibiotics.
  celecoxib: (SEH-luh-KOK-sib)
    Pronunciation of dictionary term "celecoxib"
    A drug that reduces pain. Celecoxib belongs to the family of drugs called nonsteroidal anti-inflammatory agents. It is being studied in the prevention of cancer.
  Celexa: (seh-LEK-suh)
    Pronunciation of dictionary term "Celexa"
    A drug used to treat depression. It belongs to the families of drugs called antidepressant agents and selective serotonin reuptake inhibitors (SSRIs). Also called citalopram.
  celiac disease: (SEE-lee-ak dih-ZEEZ)
    Pronunciation of dictionary term "celiac disease"
    A digestive disease that is caused by an immune response to a protein called gluten, which is found in wheat, rye, barley, and oats. Celiac disease damages the lining of the small intestine and interferes with the absorption of nutrients from food. A person with celiac disease may become malnourished no matter how much food is consumed.
  cell: (sel)
    Pronunciation of dictionary term "cell"
    In biology, the smallest unit that can live on its own and that makes up all living organisms and the tissues of the body. A cell has three main parts: the cell membrane, the nucleus, and the cytoplasm. The cell membrane surrounds the cell and controls the substances that go into and out of the cell. The nucleus is a structure inside the cell that contains the nucleolus and most of the cell’s DNA. It is also where most RNA is made. The cytoplasm is the fluid inside the cell. It contains other tiny cell parts that have specific functions, including the Golgi complex, the mitochondria, and the endoplasmic reticulum. The cytoplasm is where most chemical reactions take place and where most proteins are made. The human body has more than 30 trillion cells.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  cell aging: (sel AY-jing)
    Pronunciation of dictionary term "cell aging"
    A process by which a cell ages and permanently stops dividing but does not die. Over time, large numbers of old (or senescent) cells can build up in tissues throughout the body. These cells remain active and can release harmful substances that may cause inflammation and damage to nearby healthy cells. Cell aging may play a role in the development of cancer and other diseases that happen as people age. Also called cell senescence.
  cell culture: (sel KUL-cher)
    Pronunciation of dictionary term "cell culture"
    The growth of microorganisms such as bacteria and yeast, or human, plant, or animal cells in the laboratory. Cell cultures may be used to diagnose infections, to test new drugs, and in research.
  cell cycle: (sel SY-kul)
    Pronunciation of dictionary term "cell cycle"
    The process a cell goes through each time it divides. The cell cycle consists of a series of steps during which the chromosomes and other cell material double to make two copies. The cell then divides into two daughter cells, each receiving one copy of the doubled material. The cell cycle is complete when each daughter cell is surrounded by its own outer membrane. Also called mitotic cycle.
  cell cycle inhibitor: (sel SY-kul in-HIH-bih-ter)
    Pronunciation of dictionary term "cell cycle inhibitor"
    A substance used to block the cell division cycle, which is a series of steps a cell goes through each time it divides. There are many different types of cell cycle inhibitors. Some only work at specific steps in the cell cycle. Others work at any point in the cell cycle. Certain drugs that inhibit the cell cycle are being studied in the treatment of cancer.
  cell differentiation: (sel DIH-feh-REN-shee-AY-shun)
    Pronunciation of dictionary term "cell differentiation"
    The process during which young, immature (unspecialized) cells take on individual characteristics and reach their mature (specialized) form and function.
  cell division: (sel dih-VIH-zhun)
    Pronunciation of dictionary term "cell division"
    The process by which a single parent cell splits to form new cells, known as daughter cells. There are two types of cell division: mitosis and meiosis.
    More Information
    - How do cells divide? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/howgeneswork/cellsdivide/)
  cell motility: (sel moh-TIH-lih-tee)
    Pronunciation of dictionary term "cell motility"
    The ability of a cell to move.
  cell proliferation: (sel proh-LIH-feh-RAY-shun)
    Pronunciation of dictionary term "cell proliferation"
    An increase in the number of cells as a result of cell growth and cell division.
  cell respiration: (sel RES-pih-RAY-shun)
    Pronunciation of dictionary term "cell respiration"
    A chemical process in which oxygen is used to make energy from carbohydrates (sugars). Also called aerobic metabolism, aerobic respiration, and oxidative metabolism.
  cell signaling: (sel SIG-nuh-ling)
    Pronunciation of dictionary term "cell signaling"
    The process by which a cell responds to substances outside the cell through signaling molecules found on the surface of and inside the cell. Most molecules that lead to cell signaling are chemical substances, such as hormones, neurotransmitters, and growth factors, that bind to a specific protein receptor (signaling molecule) on or in a cell. The signals are then passed from one molecule to another inside the cell, which results in a specific cell response, such as cell division or cell death. Cell signaling is important for cells to grow and work normally. Cells that have abnormal signaling molecules may become cancer cells. Also called signal transduction.
  cell type: (sel tipe)
    Pronunciation of dictionary term "cell type"
    Describes the kinds of cells found in normal or cancer tissue. The cell type is usually identified by looking under a microscope. Some examples of cell types are lymphocytes, melanocytes, and squamous cells. In cancer, it is important to know the cell type in order to diagnose the cancer, plan treatment, and determine prognosis.
  cell-cell signaling: (sel-sel SIG-nuh-ling)
    Pronunciation of dictionary term "cell-cell signaling"
    The transfer of information from one cell to another. Cells signal each other by direct contact with each other or by the release of a substance from one cell that is taken up by another cell. Cell-cell signaling is important for cells to grow and work normally. Cells that lose the ability to respond to signals from other cells may become cancer cells. Also called cell-to-cell signaling and intercellular communication.
  cell-cycle regulation: (sel-SY-kul REH-gyoo-LAY-shun)
    Pronunciation of dictionary term "cell-cycle regulation"
    Any process that controls the series of events by which a cell goes through the cell cycle. During the cell cycle, a cell makes a copy of its DNA and other contents, and divides in two. When cell cycle regulation doesn’t happen correctly, cells may divide in an uncontrolled way, and diseases such as cancer can occur.
  cell-to-cell signaling: (sel-too-sel SIG-nuh-ling)
    Pronunciation of dictionary term "cell-to-cell signaling"
    The transfer of information from one cell to another. Cells signal each other by direct contact with each other or by the release of a substance from one cell that is taken up by another cell. Cell-to-cell signaling is important for cells to grow and work normally. Cells that lose the ability to respond to signals from other cells may become cancer cells. Also called cell-cell signaling and intercellular communication.
  CellCept: (SEL-sept)
    Pronunciation of dictionary term "CellCept"
    A drug used to prevent graft-versus-host disease (GVHD) after organ transplants. It is also being studied in the prevention of GVHD after stem cell transplants for cancer, and in the treatment of some autoimmune disorders. CellCept is a type of immunosuppressive agent. Also called mycophenolate mofetil.
  cellular adhesion: (SEL-yoo-ler ad-HEE-zhun)
    Pronunciation of dictionary term "cellular adhesion"
    The close adherence (bonding) to adjoining cell surfaces.
  cellular adoptive immunotherapy: (SEL-yoo-ler uh-DOP-tiv IH-myoo-noh-THAYR-uh-pee)
    Pronunciation of dictionary term "cellular adoptive immunotherapy"
    A type of immunotherapy in which T cells (a type of immune cell) are given to a patient to help the body fight diseases, such as cancer. In cancer therapy, T cells are usually taken from the patient's own blood or tumor tissue, grown in large numbers in the laboratory, and then given back to the patient to help the immune system fight the cancer. Sometimes, the T cells are changed in the laboratory to make them better able to target the patient's cancer cells and kill them. Types of cellular adoptive immunotherapy include chimeric antigen receptor T-cell (CAR T-cell) therapy and tumor-infiltrating lymphocyte (TIL) therapy. Cellular adoptive immunotherapy that uses T cells from a donor is being studied in the treatment of some types of cancer and some infections. Also called adoptive cell therapy, adoptive cell transfer, and T-cell transfer therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
    T-Cell Transfer Therapy
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called T-cell transfer therapy that is used to treat cancer.
    YouTube (https://www.youtube.com/watch?v=kfi-2fPp4dE)
  cellular metabolism: (SEL-yoo-ler meh-TA-buh-lih-zum)
    Pronunciation of dictionary term "cellular metabolism"
    The sum of all chemical changes that take place in a cell through which energy and basic components are provided for essential processes, including the synthesis of new molecules and the breakdown and removal of others.
  cellulitis: (sel-yoo-LY-tis)
    Pronunciation of dictionary term "cellulitis"
    An acute, spreading infection of the deep tissues of the skin and muscle that causes the skin to become warm and tender and may also cause fever, chills, swollen lymph nodes, and blisters.
  cellulose: (SEL-yoo-lose)
    Pronunciation of dictionary term "cellulose"
    A building block of plant cells and fiber. Cellulose cannot be digested by people, and is used to add bulk to the diet.
  CEM: An abbreviation for a chemotherapy combination used to treat high-risk neuroblastoma. It includes the drugs carboplatin, etoposide, and melphalan. Also called CEM regimen.
    More Information
    - CEM (https://www.cancer.gov/about-cancer/treatment/drugs/CEM)
  CEM regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CEM regimen"
    An abbreviation for a chemotherapy combination used to treat high-risk neuroblastoma. It includes the drugs carboplatin, etoposide, and melphalan. Also called CEM.
    More Information
    - CEM (https://www.cancer.gov/about-cancer/treatment/drugs/CEM)
  cemiplimab: (seh-MIP-lih-mab)
    Pronunciation of dictionary term "cemiplimab"
    A drug that binds to the protein PD-1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Cemiplimab is used to treat certain types of basal cell carcinoma and cutaneous squamous cell carcinoma (types of skin cancer) that are locally advanced or have spread to other parts of the body. It is also used alone or with other drugs to treat adults with non-small cell lung cancer that is locally advanced or has spread to other parts of the body and may have the PD-L1 protein, but does not have a mutation (change) in the EGFR, ALK, or ROS1 gene. It is also being studied in the treatment of other types of cancer. Cemiplimab may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Libtayo.
    More Information
    - Cemiplimab-rwlc (https://www.cancer.gov/about-cancer/treatment/drugs/cemiplimab-rwlc)
  Centers for Disease Control and Prevention: (SEN-terz … dih-ZEEZ kun-TROLE … pree-VEN-shun)
    Pronunciation of dictionary term "Centers for Disease Control and Prevention"
    A U.S. federal government agency whose mission is to protect public health by preventing and controlling disease, injury, and disability. The Centers for Disease Control and Prevention promotes healthy behaviors and safe, healthy environments. It keeps track of health trends, tries to find the cause of health problems and outbreaks of disease, and responds to new public health threats. The Centers for Disease Control and Prevention works with state health departments and other organizations throughout the country and the world to help prevent and control disease. The Centers for Disease Control and Prevention is part of the U.S. Public Health Service of the Department of Health and Human Services (DHHS). Also called CDC.
    More Information
    - Centers for Disease Control and Prevention (https://www.cdc.gov/)
  centimeter: (SEN-tih-MEE-ter)
    Pronunciation of dictionary term "centimeter"
    A measure of length in the metric system. There are 100 centimeters in a meter and 2½ centimeters in an inch.
    Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).
    Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.
  central nervous system: (SEN-trul NER-vus SIS-tem)
    Pronunciation of dictionary term "central nervous system"
    The brain and spinal cord. Also called CNS.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
  central nervous system depressant: (SEN-trul NER-vus SIS-tem dee-PREH-sunt)
    Pronunciation of dictionary term "central nervous system depressant"
    A type of drug that slows down brain activity, which causes the muscles to relax and calms and soothes a person. Central nervous system depressants are used to treat insomnia (trouble sleeping), anxiety, panic attacks, and seizures. They may also be used to relieve anxiety and tension before surgery. Examples of central nervous system depressants are benzodiazepines, barbiturates, and certain sleep medicines. Central nervous system depressants are sometimes called sedatives or tranquilizers. Also called CNS depressant.
  central nervous system metastasis: (SEN-trul NER-vus SIS-tem meh-TAS-tuh-sis)
    Pronunciation of dictionary term "central nervous system metastasis"
    Cancer that has spread from the original (primary) tumor to the central nervous system (CNS). Also called CNS metastasis.
  central nervous system primitive neuroectodermal tumor: (SEN-trul NER-vus SIS-tem PRIH-muh-tiv NOOR-oh-EK-toh-DER-mul TOO-mer)
    Pronunciation of dictionary term "central nervous system primitive neuroectodermal tumor"
    A type of cancer that arises from a particular type of cell within the brain or spinal cord. Also called CNS PNET.
  central nervous system prophylaxis: (SEN-trul NER-vus SIS-tem PROH-fih-LAK-sis)
    Pronunciation of dictionary term "central nervous system prophylaxis"
    A type of treatment that uses intrathecal chemotherapy (chemotherapy injected directly into the fluid-filled space between the thin layers of tissue that cover the brain and spinal cord) or high-dose chemotherapy injected into a vein to kill cancer cells in the central nervous system (CNS). Radiation therapy is also sometimes used. Central nervous system prophylaxis is given when the cancer is diagnosed because standard chemotherapy cannot get into the CNS and kill cancer cells that may be hiding in there. It is used to lessen the chance cancer will come back in the CNS after the first treatment. Central nervous system prophylaxis is used with other therapy to treat certain types of leukemia and lymphoma that may spread to the CNS. Also called CNS prophylaxis.
    Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.
    Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.
  central nervous system sanctuary therapy: (SEN-trul NER-vus SIS-tem SANK-choo-WAYR-ee THAYR-uh-pee)
    Pronunciation of dictionary term "central nervous system sanctuary therapy"
    Chemotherapy or radiation therapy given to the central nervous system (CNS) as a preventive treatment. It kills cancer cells that may be in the brain and spinal cord, even though no cancer has been detected there. Also called central nervous system prophylaxis, CNS prophylaxis, and CNS sanctuary therapy.
  central nervous system stimulant: (SEN-trul NER-vus SIS-tum STIM-yoo-lunt)
    Pronunciation of dictionary term "central nervous system stimulant"
    A type of drug that increases the levels of certain chemicals in the brain and increases alertness, attention, energy, and physical activity. Central nervous system stimulants also raise blood pressure and increase heart rate and breathing rate. They are used to treat depression, attention deficit hyperactivity disorder (a disorder in which a person has problems paying attention, controlling actions, and remaining still or quiet), and narcolepsy (a sleep disorder). Also called CNS stimulant.
  central nervous system tumor: (SEN-trul NER-vus SIS-tem TOO-mer)
    Pronunciation of dictionary term "central nervous system tumor"
    A tumor of the central nervous system, including brain stem glioma, craniopharyngioma, medulloblastoma, and meningioma. Also called CNS tumor.
  central venous access catheter: (SEN-trul VEE-nus AK-ses KA-theh-ter)
    Pronunciation of dictionary term "central venous access catheter"
    A device used to draw blood and give treatments, including intravenous fluids, drugs, or blood transfusions. A thin, flexible tube is inserted into a vein, usually below the collarbone. It is guided (threaded) into a large vein above the right side of the heart called the superior vena cava. A needle is inserted into a port outside of the body to draw blood or give fluids. A central venous access catheter may stay in place for weeks or months and helps avoid the need for repeated needle sticks. There are several types of central venous access catheters.
    Central venous catheter. A central venous catheter is a thin, flexible tube that is inserted into a vein, usually below the right collarbone, and guided (threaded) into a large vein above the right side of the heart called the superior vena cava. It is used to give intravenous fluids, blood transfusions, chemotherapy, and other drugs. The catheter is also used for taking blood samples. It may stay in place for weeks or months and helps avoid the need for repeated needle sticks.
    Central venous catheter; drawing of a central venous catheter that goes from a vein below the right collarbone to a large vein above the right side of the heart called the superior vena cava. An inset shows a central venous catheter in the right side of the chest with a clear plastic dressing over it.
  CEP-2563 dihydrochloride: (... dy-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "CEP-2563 dihydrochloride"
    A substance being studied in the treatment of some types of cancer. CEP-2563 dihydrochloride blocks certain proteins involved in the growth of some tumors and may kill cancer cells. It is a type of receptor tyrosine kinase inhibitor.
  CEP-701: A drug being studied in the treatment of acute leukemias and some other types of cancer. It binds to a protein that is present on the surface of some types of cancer cells and stops them from dividing. CEP-701 is a type of receptor tyrosine kinase inhibitor and a type of indolocarbazole alkaloid. Also called lestaurtinib.
  cephalexin: (seh-fuh-LEK-sin)
    Pronunciation of dictionary term "cephalexin"
    An antibiotic drug that belongs to the family of drugs called cephalosporins.
  cephalosporin: (SEH-fuh-loh-SPOR-in)
    Pronunciation of dictionary term "cephalosporin"
    A drug used to treat bacterial infections. It belongs to the family of drugs called antibiotics.
  ceramide: (SAYR-uh-mide)
    Pronunciation of dictionary term "ceramide"
    A type of lipid (fat) found in the membranes of cells and the covers of nerves. Some ceramides are important in signal transduction (the process by which a cell responds to substances in its environment) and may cause some types of cells to die. Ceramides are being studied in the treatment of cancer.
  cerclage: (ser-KLAZH)
    Pronunciation of dictionary term "cerclage"
    A procedure in which a special stitch or band is placed around the cervix to help keep it closed during pregnancy. A cerclage may be done to prevent a miscarriage or premature birth (the birth of a baby before 37 weeks of pregnancy) due to having a weakened cervix. In a person whose cervix has been removed by surgery, the stitch or band is placed on the lower end of the uterus.
    Cervical cerclage. A special stitch is placed around the cervix to help keep it closed during a pregnancy (left panel). If the cervix has been removed by surgery, the stitch is placed on the lower end of the uterus (right panel).
    Two-panel drawing showing a cervical cerclage; the panel on the left shows the uterus and the cervix with a cerclage stitch around it. Also shown is the external OS (the opening between the cervix and vagina), the vagina, and part of the pelvic cavity. The panel on the right shows the lower part of the cervix removed and a cerclage stitch around the lower end of the uterus.
  cerebellar hemangioblastoma: (SAYR-eh-BEH-ler hee-MAN-jee-oh-blas-TOH-muh)
    Pronunciation of dictionary term "cerebellar hemangioblastoma"
    A benign, slow-growing tumor in the cerebellum (part of the brain at the back of the head), made up of abnormal blood vessel growth. People with von Hippel-Landau disease have an increased risk of developing hemangioblastomas.
  cerebellar mutism syndrome: (SAYR-eh-BEH-ler MYOO-tih-zum SIN-drome)
    Pronunciation of dictionary term "cerebellar mutism syndrome"
    A condition that may occur in patients who have had surgery to remove a tumor in certain parts of the brain, including the cerebellum. Cerebellar mutism syndrome usually appears 1 or 2 days after surgery. Symptoms include loss of speech, trouble swallowing and eating, loss of balance, trouble walking, loss of muscle tone, mood swings, and changes in personality. Many of these symptoms go away over time. Also called CMS.
  cerebellopontine: (SAYR-eh-BEH-loh-PON-teen)
    Pronunciation of dictionary term "cerebellopontine"
    Having to do with two structures of the brain, the cerebellum (located at the lower back of the brain) and the pons (located at the base of the brain in front of the cerebellum) and the area between them.
  cerebellum: (SAYR-eh-BEH-lum)
    Pronunciation of dictionary term "cerebellum"
    The portion of the brain in the back of the head between the cerebrum and the brain stem. The cerebellum controls balance for walking and standing, and other complex motor functions.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  cerebral edema: (seh-REE-brul eh-DEE-muh)
    Pronunciation of dictionary term "cerebral edema"
    A buildup of fluid in the brain that causes swelling and increases pressure inside the skull. This pressure prevents the brain from getting enough oxygen and blood flow, which can lead to brain damage if not treated. Cerebral edema can be caused by brain injuries, stroke, infections, tumors, or high altitudes. Symptoms may include headache, dizziness, nausea, vomiting, vision changes, vision loss, and difficulty speaking or moving.
  cerebral hemisphere: (seh-REE-brul HEH-mis-feer)
    Pronunciation of dictionary term "cerebral hemisphere"
    One half of the cerebrum, the part of the brain that controls muscle functions and also controls speech, thought, emotions, reading, writing, and learning. The right hemisphere controls the muscles on the left side of the body, and the left hemisphere controls the muscles on the right side of the body.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  cerebrospinal fluid: (seh-REE-broh-SPY-nul FLOO-id)
    Pronunciation of dictionary term "cerebrospinal fluid"
    The fluid that flows in and around the hollow spaces of the brain and spinal cord, and between two of the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). Cerebrospinal fluid is made by tissue called the choroid plexus in the ventricles (hollow spaces) in the brain. Also called CSF.
    Cerebrospinal fluid (CSF, shown in blue) is made by tissue that lines the ventricles (hollow spaces) in the brain. It flows in and around the brain and spinal cord to help cushion them from injury and provide nutrients.
    Drawing shows cerebrospinal fluid (CSF) in the brain and spinal cord. Also shown are the ventricles in the brain, where CSF is made.
  cerebrospinal fluid diversion: (seh-REE-broh-SPY-nul FLOO-id dih-VER-zhun)
    Pronunciation of dictionary term "cerebrospinal fluid diversion"
    A process that uses a shunt (a long, thin tube) to drain extra cerebrospinal fluid (CSF) that has built up around the brain or spinal cord. The shunt is placed in a ventricle (fluid-filled space) of the brain or in a fluid-filled space between the thin layers of tissue around the spinal cord. It is then threaded under the skin to another part of the body, usually the abdomen, heart, or space between the chest wall and the lungs. The shunt carries extra CSF away from the brain or spinal cord so it may be absorbed elsewhere in the body. This decreases the fluid and pressure on the brain or spinal cord.
    A cerebrospinal fluid (CSF) shunt (a long, thin tube) carries extra CSF away from the brain so it may be absorbed elsewhere in the body. The shunt is placed in a ventricle (fluid-filled space) in the brain and threaded under the skin to another part of the body, usually the abdomen. The shunt has a valve that controls the flow of CSF.
    Drawing shows extra cerebrospinal fluid (CSF) flowing through a shunt (a long, thin tube) from a ventricle (fluid-filled space) in the brain into the abdomen. The shunt goes from the ventricle, under the skin in the neck and chest, and into the abdomen. Also shown is a shunt valve that controls the flow of CSF.
  cerebrospinal fluid shunt: (seh-REE-broh-SPY-nul FLOO-id ...)
    Pronunciation of dictionary term "cerebrospinal fluid shunt"
    A long, thin tube that is placed in a ventricle (fluid-filled space) of the brain to drain extra cerebrospinal fluid (CSF) that has built up around the brain or spinal cord. It may sometimes be placed in the fluid-filled space between the thin layers of tissue around the spinal cord. The shunt is then threaded under the skin to another part of the body, usually the abdomen, heart, or space between the chest wall and the lungs. The shunt carries extra CSF away from the brain or spinal cord so it may be absorbed elsewhere in the body. This decreases the fluid and pressure on the brain or spinal cord.
    A cerebrospinal fluid (CSF) shunt (a long, thin tube) carries extra CSF away from the brain so it may be absorbed elsewhere in the body. The shunt is placed in a ventricle (fluid-filled space) in the brain and threaded under the skin to another part of the body, usually the abdomen. The shunt has a valve that controls the flow of CSF.
    Drawing shows extra cerebrospinal fluid (CSF) flowing through a shunt (a long, thin tube) from a ventricle (fluid-filled space) in the brain into the abdomen. The shunt goes from the ventricle, under the skin in the neck and chest, and into the abdomen. Also shown is a shunt valve that controls the flow of CSF.
  cerebrovascular accident: (seh-REE-broh-VAS-kyoo-ler AK-sih-dent)
    Pronunciation of dictionary term "cerebrovascular accident"
    In medicine, a loss of blood flow to part of the brain, which damages brain tissue. Cerebrovascular accidents are caused by blood clots and broken blood vessels in the brain. Symptoms include dizziness, numbness, weakness on one side of the body, and problems with talking, writing, or understanding language. The risk of cerebrovascular accident is increased by high blood pressure, older age, smoking, diabetes, high cholesterol, heart disease, atherosclerosis (a buildup of fatty material and plaque inside the coronary arteries), and a family history of cerebrovascular accident. Also called CVA and stroke.
  cerebrum: (seh-REE-brum)
    Pronunciation of dictionary term "cerebrum"
    The largest part of the brain. It is divided into two hemispheres, or halves, called the cerebral hemispheres. Areas within the cerebrum control muscle functions and also control speech, thought, emotions, reading, writing, and learning.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  ceremony: (SAYR-eh-MOH-nee)
    Pronunciation of dictionary term "ceremony"
    A series of acts performed for a special occasion or to mark a rite of passage. Ceremonies can be casual or formal.
  ceritinib: (seh-RIH-tih-nib)
    Pronunciation of dictionary term "ceritinib"
    A drug used to treat adults with non-small cell lung cancer that has spread and is ALK positive. It is also being studied in the treatment of other types of cancer. Ceritinib blocks certain proteins made by the ALK gene. Blocking these proteins may stop the growth and spread of cancer cells. Ceritinib is a type of tyrosine kinase inhibitor. Also called Zykadia.
    More Information
    - Ceritinib (https://www.cancer.gov/about-cancer/treatment/drugs/ceritinib)
  Cerubidine: (seh-ROO-bih-deen)
    Pronunciation of dictionary term "Cerubidine"
    A drug that comes from the bacterium Streptomyces coeruleorubidus and is used with other drugs as remission induction therapy to treat adults with acute myeloid leukemia and adults and children with acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Cerubidine blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Daunorubicin is the active ingredient of daunorubicin hydrochloride. Also called daunomycin hydrochloride and daunorubicin hydrochloride.
    More Information
    - Daunorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochloride)
  Cervarix: (SER-vuh-rix)
    Pronunciation of dictionary term "Cervarix"
    A vaccine that is no longer available in the United States but is still used in other countries to protect against infection with two types of human papillomavirus (HPV). Cervarix is used in females aged 9 to 25 years to protect against high-risk HPV types 16 and 18, which most often cause cervical cancer and lesions that may become cervical cancer. Cervarix may also prevent other HPV-related cancers. Also called recombinant human papillomavirus bivalent vaccine.
    More Information
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
    - Recombinant Human Papillomavirus (HPV) Bivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-bivalent-vaccine)
  cervical: (SER-vih-kul)
    Pronunciation of dictionary term "cervical"
    Relating to the neck, or to the neck of any organ or structure. Cervical lymph nodes are located in the neck. Cervical cancer refers to cancer of the uterine cervix, which is the lower, narrow end (the “neck”) of the uterus.
    More Information
    - What Is Cervical Cancer?
  cervical adenocarcinoma: (SER-vih-kul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "cervical adenocarcinoma"
    A type of cervical cancer that begins in the glandular cells of the cervix. These cells make mucus and are found in tissue that lines the inner part of the cervix and the uterus. Cervical adenocarcinoma is less common than cervical squamous cell carcinoma.
  cervical cancer: (SER-vih-kul KAN-ser)
    Pronunciation of dictionary term "cervical cancer"
    Cancer that forms in tissues of the cervix (the organ connecting the uterus and vagina). It is usually a slow-growing cancer that may not have symptoms but can be found with regular Pap tests (a procedure in which cells are scraped from the cervix and looked at under a microscope). Cervical cancer is almost always caused by human papillomavirus (HPV) infection.
    More Information
    - What Is Cervical Cancer?
  cervical dysplasia: (SER-vih-kul dis-PLAY-zhuh)
    Pronunciation of dictionary term "cervical dysplasia"
    A term used to describe the presence of abnormal cells on the surface of the cervix. Cervical dysplasia is usually caused by certain types of human papillomavirus (HPV) and is found when a Pap test or cervical biopsy is done. It can be mild, moderate, or severe, depending on how abnormal the cells look under a microscope and how much of the cervical tissue is affected. Cervical dysplasia is not cancer but may become cancer and spread to nearby normal tissue. It is sometimes called squamous intraepithelial lesion (SIL) or cervical intraepithelial neoplasia (CIN).
    Cervical changes. The cervix is the lower, narrow end of the uterus that forms a canal between the uterus and vagina. Before cancer cells form in tissues of the cervix, the cells of the cervix go through abnormal changes called dysplasia. There are different types of dysplasia. Mild dysplasia, called low-grade intraepithelial lesion (LSIL) is one type. Moderate or severe dysplasia, called high-grade intraepithelial lesion (HSIL) is another type of dysplasia. LSIL and HSIL may or may not become cancer.
    Cervical changes; drawing shows a cross-section of the uterus, cervix, and vagina. Also shown are four panels showing cell changes inside the cervix. The first panel shows normal cells. The second and third panels show abnormal cells called LSIL and HSIL. The fourth panel shows cervical cancer cells. Arrows are used between the panels to show that normal cells may become LSIL or HSIL, which may or may not become cancer.
  cervical intraepithelial neoplasia: (SER-vih-kul IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "cervical intraepithelial neoplasia"
    A term used to describe abnormal cells that are found on the surface of the cervix when a biopsy is done. Cervical intraepithelial neoplasia is usually caused by infection with certain types of human papillomavirus (HPV). Cervical intraepithelial neoplasia is not cancer but may become cancer and spread to nearby normal tissue. It is graded on a scale of 1 to 3, based on how abnormal the cells look under a microscope and how much of the cervical tissue is affected. For example, CIN 1 has slightly abnormal cells and is less likely to become cancer than CIN 2 or CIN 3. Cervical intraepithelial neoplasia is sometimes called cervical dysplasia. Also called CIN.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cervical squamous cell carcinoma: (SER-vih-kul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "cervical squamous cell carcinoma"
    A type of cervical cancer that begins in squamous cells of the cervix. Cervical squamous cells are found in tissue that lines the outer part of the cervix. They are thin, flat cells that look like fish scales under a microscope. Most cervical cancers are squamous cell carcinomas.
  cervical squamous intraepithelial neoplasia 1: (SER-vih-kul SKWAY-mus IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh ...)
    Pronunciation of dictionary term "cervical squamous intraepithelial neoplasia 1"
    A cervical biopsy finding that means slightly abnormal cells were found on the surface of the cervix. Cervical squamous intraepithelial neoplasia 1 is usually caused by infection with certain types of human papillomavirus (HPV). Cervical squamous intraepithelial neoplasia 1 is not cancer and usually goes away on its own without treatment, but sometimes it can become cancer and spread to nearby normal tissue. Cervical squamous intraepithelial neoplasia 1 is sometimes called low-grade or mild dysplasia. Also called CIN 1.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cervical squamous intraepithelial neoplasia 2: (SER-vih-kul SKWAY-mus IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh ...)
    Pronunciation of dictionary term "cervical squamous intraepithelial neoplasia 2"
    A cervical biopsy finding that means moderately abnormal cells were found on the surface of the cervix. Cervical squamous intraepithelial neoplasia 2 is usually caused by infection with certain types of human papillomavirus (HPV). Cervical squamous intraepithelial neoplasia 2 is not cancer but may become cancer and spread to nearby normal tissue if not treated. Treatment for cervical squamous intraepithelial neoplasia 2 may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. Cervical squamous intraepithelial neoplasia 2 is sometimes called high-grade or moderate dysplasia. Also called CIN 2.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cervical squamous intraepithelial neoplasia 2/3: (SER-vih-kul SKWAY-mus IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh …)
    Pronunciation of dictionary term "cervical squamous intraepithelial neoplasia 2/3"
    A cervical biopsy finding that means a mix of moderately abnormal and severely abnormal cells were found on the surface of the cervix. Cervical squamous intraepithelial neoplasia 2/3 has features of both CIN 2 and CIN 3. It is usually caused by infection with certain types of human papillomavirus (HPV). Cervical squamous intraepithelial neoplasia 2/3 is not cancer but may become cancer and spread to nearby normal tissue if not treated. Treatment for cervical squamous intraepithelial neoplasia 2/3 may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. Also called CIN 2/3.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cervical squamous intraepithelial neoplasia 3: (SER-vih-kul SKWAY-mus IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh …)
    Pronunciation of dictionary term "cervical squamous intraepithelial neoplasia 3"
    A cervical biopsy finding that means severely abnormal cells were found on the surface of the cervix. Cervical squamous intraepithelial neoplasia 3 is usually caused by infection with certain types of human papillomavirus (HPV). Cervical squamous intraepithelial neoplasia 3 is not cancer but may become cancer and spread to nearby normal tissue if not treated. Treatment for cervical squamous intraepithelial neoplasia 3 may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. Cervical squamous intraepithelial neoplasia 3 is sometimes called high-grade or severe dysplasia. Also called CIN 3.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cervicectomy: (SER-vih-SEK-toh-mee)
    Pronunciation of dictionary term "cervicectomy"
    Surgery to remove the cervix. There are two types of cervicectomy: simple cervicectomy and radical cervicectomy. During a simple cervicectomy, only the cervix is removed. During a radical cervicectomy, the cervix, nearby tissue, and the upper part of the vagina are removed. Lymph nodes in the pelvis may also be removed. Because the uterus, fallopian tubes, and ovaries are not removed, a cervicectomy may be done to treat a person with early-stage cervical cancer who wants to become pregnant in the future. Also called trachelectomy.
  CerviPrep: (SER-vih-PREP)
    Pronunciation of dictionary term "CerviPrep"
    A device used to deliver drugs directly to the cervix (the lower, narrow end of the uterus that forms a canal between the uterus and vagina). The CerviPrep covers the cervix and protects surrounding tissue. Drugs may be injected into the inner part of the cervix through a syringe attached to the device.
  cervix: (SER-vix)
    Pronunciation of dictionary term "cervix"
    The lower, narrow end of the uterus (womb) that connects the uterus to the vagina (birth canal). The cervix allows fluids, such as menstrual blood, to pass from the uterus into the vagina. It also widens during the birth of a baby. The cervix has two main parts, the ectocervix and the endocervix. The ectocervix is the outer part of the cervix that can be seen during a pelvic exam. The endocervix is the inner part of the cervix that forms a canal that connects the vagina to the uterus. The area where the endocervix and ectocervix come together is called the squamocolumnar junction (also called the transformation zone). Most abnormal cell changes and cervical cancers begin in the squamous cells (thin, flat-looking cells under a microscope) of the squamocolumnar junction.
    More Information
    - What Is Cervical Cancer?
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  Cesamet: (SEH-suh-met)
    Pronunciation of dictionary term "Cesamet"
    A synthetic pill form of an active chemical in marijuana called delta-9-tetrahydrocannabinol (THC). Cesamet is used to treat nausea and vomiting caused by chemotherapy in patients who have not been helped by other therapy. It is a type of cannabinoid. Also called nabilone.
  cesarean delivery: (sih-ZAYR-ee-un deh-LIH-veh-ree)
    Pronunciation of dictionary term "cesarean delivery"
    The delivery of a baby through an incision (cut) made in a person’s abdomen and uterus. After the baby is delivered, the umbilical cord is clamped and cut, the placenta is removed, and the cuts in the uterus and abdomen are closed with stitches. A cesarean delivery may be done if there are problems during labor or if the baby is in distress, is too big, or is in an abnormal position in the uterus. It may also be done if there is more than one baby being delivered, if there are problems with the placenta, or if the person has an infection or other health problem that would prevent having a vaginal delivery. Also called C-section and cesarean section.
  cesarean section: (sih-ZAYR-ee-un SEK-shun)
    Pronunciation of dictionary term "cesarean section"
    The delivery of a baby through an incision (cut) made in a person’s abdomen and uterus. After the baby is delivered, the umbilical cord is clamped and cut, the placenta is removed, and the cuts in the uterus and abdomen are closed with stitches. A cesarean section may be done if there are problems during labor or if the baby is in distress, is too big, or is in an abnormal position in the uterus. It may also be done if there is more than one baby being delivered, if there are problems with the placenta, or if the person has an infection or other health problem that would prevent having a vaginal delivery. Also called C-section and cesarean delivery.
  cetuximab: (seh-TUK-sih-mab)
    Pronunciation of dictionary term "cetuximab"
    A drug used alone or with other drugs to treat certain types of head and neck cancer and colorectal cancer. It is also being studied in the treatment of other types of cancer. Cetuximab binds to a protein called EGFR, which is found on some types of cancer cells. This may help keep cancer cells from growing. Cetuximab is a type of monoclonal antibody. Also called Erbitux.
    More Information
    - Cetuximab (https://www.cancer.gov/about-cancer/treatment/drugs/cetuximab)
  CEV: An abbreviation for a chemotherapy combination used to treat retinoblastoma in children. It includes the drugs carboplatin, etoposide, and vincristine. Also called CEV regimen.
    More Information
    - CEV (https://www.cancer.gov/about-cancer/treatment/drugs/CEV)
  CEV regimen: (... REH-jih-men)
    Pronunciation of dictionary term "CEV regimen"
    An abbreviation for a chemotherapy combination used to treat retinoblastoma in children. It includes the drugs carboplatin, etoposide, and vincristine. Also called CEV.
    More Information
    - CEV (https://www.cancer.gov/about-cancer/treatment/drugs/CEV)
  cevimeline hydrochloride: (seh-VIH-meh-leen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "cevimeline hydrochloride"
    A drug used to treat certain disorders of the salivary gland. It is also being studied as a treatment for dry mouth caused by radiation therapy to the head and neck. It increases the amount of saliva and sweat made by saliva and sweat glands. Cevimeline hydrochloride is a type of cholinergic agonist. Also called Evoxac.
  CFC syndrome: (… SIN-drome)
    Pronunciation of dictionary term "CFC syndrome"
    A rare genetic condition that affects many parts of the body, especially the heart, face, and skin. People with CFC syndrome usually have growth, developmental, and learning delays. Other signs and symptoms include heart defects, an abnormally large head, unusual facial features, and problems with the skin, eyes, and the gastrointestinal and nervous systems. People with CFC syndrome may also have thin, dry, curly hair and sparse or no eyelashes or eyebrows. CFC syndrome is a type of disease called a RASopathy that is caused by mutations (changes) in the BRAF, MAP2K1, MAP2K2, or KRAS gene. These genes make proteins involved in a cell signaling pathway that controls many important cell functions. Also called cardiofaciocutaneous syndrome.
  CFS: A condition that lasts for more than 6 months in which a person feels tired most of the time. They may also have trouble concentrating and carrying out daily activities. Other symptoms include sore throat, fever, muscle weakness, headache, and joint pain. Also called chronic fatigue syndrome.
  CgA: A protein found inside neuroendocrine cells, which release CgA and certain hormones into the blood. CgA may be found in higher than normal amounts in patients with certain neuroendocrine tumors, small cell lung cancer, prostate cancer, and other conditions. Measuring the amount of CgA in the blood may help to diagnose cancer or other conditions or find out how well treatment is working or if cancer has come back. CgA is a type of tumor marker. Also called chromogranin A.
  CGP 48664: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called S-adenosylmethionine decarboxylase inhibitors.
  Ch14.18: A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF), aldesleukin (IL-2), and 13-cis-retinoic acid to treat children with high-risk neuroblastoma. It is used in patients whose disease has gotten better with other anticancer treatment. Ch14.18 binds to a substance called GD2, which is found on some types of cancer cells. Ch14.18 may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called dinutuximab, MOAB Ch14.18, monoclonal antibody Ch14.18, and Unituxin.
    More Information
    - Dinutuximab (https://www.cancer.gov/about-cancer/treatment/drugs/dinutuximab)
  Chamberlain procedure: (CHAYM-ber-len proh-SEE-jer)
    Pronunciation of dictionary term "Chamberlain procedure"
    A procedure in which a tube is inserted into the chest to view the tissues and organs in the area between the lungs and between the breastbone and heart. The tube is inserted through an incision next to the breastbone. This procedure is usually used to get a tissue sample from the lymph nodes on the left side of the chest. Also called anterior mediastinotomy.
    Mediastinoscopy. A mediastinoscope is inserted into the chest through an incision above the breastbone to look for abnormal areas between the lungs. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a cutting tool. Tissue samples may be taken from lymph nodes on the right side of the chest and checked under a microscope for signs of cancer. In an anterior mediastinotomy (Chamberlain procedure), the incision is made beside the breastbone to remove tissue samples from the lymph nodes on the left side of the chest.
    Mediastinoscopy; shows mediastinoscope with light and lens inserted into the chest through an incision above the breastbone. Drawing shows right and left lungs, trachea, and lymph nodes. Inset shows anterior mediastinotomy (Chamberlain procedure) with incision beside the breastbone.
  chamomile: (KA-muh-mile)
    Pronunciation of dictionary term "chamomile"
    A family of plants with daisy-like flowers. Two types are German chamomile and Roman or English chamomile. These are used in teas to calm and relax, to improve sleep, and to help with stomach problems. The essential oil (scented liquid taken from plants) of chamomile is used in perfumes, shampoos, lotions, and aromatherapy.
  Chantix: (CHAN-tix)
    Pronunciation of dictionary term "Chantix"
    A drug used to help people stop smoking by acting the same way nicotine acts in the brain. It is a type of nicotine receptor partial agonist. Also called varenicline tartrate.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  chaplain: (CHA-plin)
    Pronunciation of dictionary term "chaplain"
    A member of the clergy in charge of a chapel or who works with the military or with an institution, such as a hospital.
  charged-particle radiation therapy: (… PAR-tih-kul RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "charged-particle radiation therapy"
    A type of external radiation therapy that uses a special machine to make invisible, high-energy particles (protons or helium ions) that kill cancer cells. This type of radiation may cause less damage to nearby healthy tissue than radiation therapy with high-energy x-rays.
  chaste tree berry: (chayst ... BAYR-ee)
    Pronunciation of dictionary term "chaste tree berry"
    An extract made from the fruit of the chaste tree (Vitex agnus-castus) found in parts of Asia and Europe. It is claimed to treat infertility and to lessen symptoms that may occur before or during a woman’s menstrual period, such as headaches and irregular bleeding. Chaste tree berry may affect levels of reproductive hormones in the blood. It is a type of phytomedicine. Also called monk’s pepper and Vitex.
  cheekbone: (CHEEK-bone)
    Pronunciation of dictionary term "cheekbone"
    One of a pair of bones on each upper side of the face that forms the cheek and part of the eye socket. The cheekbones help give shape and structure to the face and are connected to the jaw and bones near the ears, forehead, and skull. They protect the nerves and blood vessels that run through the face and provide an attachment for muscles that help the jaw move. Also called zygomatic bone.
  chelating agent: (KEE-lay-ting AY-jent)
    Pronunciation of dictionary term "chelating agent"
    A chemical compound that binds tightly to metal ions. In medicine, chelating agents are used to remove toxic metals from the body. They are also being studied in the treatment of cancer.
  chemabrasion: (KEE-muh-BRAY-zhun)
    Pronunciation of dictionary term "chemabrasion"
    A procedure used to improve the way certain skin problems look. These problems include acne scars, wrinkles, or skin changes caused by long-term sun exposure. A chemical solution is put on the skin to dissolve the top layers of skin cells. Also called chemexfoliation and chemical peel.
  chemexfoliation: (KEH-mex-FOH-lee-AY-shun)
    Pronunciation of dictionary term "chemexfoliation"
    A procedure used to improve the way certain skin problems look. These problems include acne scars, wrinkles, or skin changes caused by long-term sun exposure. A chemical solution is put on the skin to dissolve the top layers of skin cells. Also called chemabrasion and chemical peel.
  chemical: (KEH-mih-kul)
    Pronunciation of dictionary term "chemical"
    A substance made up of elements, such as hydrogen or sodium.
  chemical imbalance: (KEH-mih-kul im-BA-lunts)
    Pronunciation of dictionary term "chemical imbalance"
    Too much or too little of any substance that helps the body work the way it should. A chemical imbalance may be caused by certain tumors and can cause changes in behavior or emotion.
  chemical peel: (KEH-mih-kul …)
    Pronunciation of dictionary term "chemical peel"
    A procedure used to improve the way certain skin problems look. These problems include acne scars, wrinkles, or skin changes caused by long-term sun exposure. A chemical solution is put on the skin to dissolve the top layers of skin cells. Also called chemabrasion and chemexfoliation.
  chemo brain: (KEE-moh brayn)
    Pronunciation of dictionary term "chemo brain"
    A term commonly used to describe thinking and memory problems that a patient with cancer may have before, during, or after cancer treatment. Signs and symptoms of chemo brain include disorganized behavior or thinking, confusion, memory loss, and trouble concentrating, paying attention, learning, and making decisions. Chemo brain may be caused by the cancer itself (such as brain tumors) or by cancer treatment, such as chemotherapy and other anticancer drugs, radiation therapy, hormone therapy, and surgery. It may also be caused by conditions related to cancer treatment, such as anemia, fatigue, infection, pain, hormone changes, sleep problems, nutrition problems, stress, anxiety, and depression. Chemo brain may last for a short time or for many years.
  chemoembolization: (KEE-moh-EM-boh-lih-ZAY-shun)
    Pronunciation of dictionary term "chemoembolization"
    A procedure in which the blood supply to a tumor is blocked after anticancer drugs are given in blood vessels near the tumor. Sometimes, the anticancer drugs are attached to small beads that are injected into an artery that feeds the tumor. The beads block blood flow to the tumor as they release the drug. This allows a higher amount of drug to reach the tumor for a longer period of time, which may kill more cancer cells. It also causes fewer side effects because very little of the drug reaches other parts of the body. Chemoembolization is used to treat liver cancer. Also called TACE and transarterial chemoembolization.
  chemoimmunotherapy: (KEE-moh-IH-myoo-noh-THAYR-uh-pee)
    Pronunciation of dictionary term "chemoimmunotherapy"
    Chemotherapy combined with immunotherapy. Chemotherapy uses different drugs to kill or slow the growth of cancer cells; immunotherapy uses treatments to stimulate or restore the ability of the immune system to fight cancer.
  chemokine: (KEE-moh-kine)
    Pronunciation of dictionary term "chemokine"
    One of a large group of proteins that is made by certain immune cells and other cells in the body. Chemokines play an important role in the body’s immune response. They stimulate the movement of certain types of white blood cells and attract them to areas of inflammation to help the body fight infections, inflammatory conditions, and other diseases. They also help keep the immune system working the way it should. A chemokine is a type of cytokine.
  chemoprevention: (KEE-moh-pree-VEN-shun)
    Pronunciation of dictionary term "chemoprevention"
    The use of certain drugs or other substances to help lower a person’s risk of developing cancer or keep it from coming back. For example, tamoxifen and raloxifene are drugs that may be used to prevent certain types of breast cancer in women who are at high risk of developing the disease.
    More Information
    - Cancer Prevention Overview
  chemoprevention study: (KEE-moh-pree-VEN-shun STUH-dee)
    Pronunciation of dictionary term "chemoprevention study"
    In cancer prevention, a clinical trial that studies whether taking certain medicines, vitamins, minerals, or food supplements can prevent cancer. Also called agent study.
    More Information
    - Cancer Prevention Overview
  chemoprotective agent: (KEE-moh-proh-TEK-tiv AY-jent)
    Pronunciation of dictionary term "chemoprotective agent"
    A type of drug that helps protect healthy tissue from some of the side effects caused by certain anticancer drugs. For example, in patients receiving certain anticancer drugs, amifostine helps protect the kidneys, mesna helps protect the bladder, and dexrazoxane (Zinecard) helps reduce heart damage.
  chemoradiation: (KEE-moh-RAY-dee-AY-shun)
    Pronunciation of dictionary term "chemoradiation"
    Treatment that combines chemotherapy with radiation therapy. Also called chemoradiotherapy.
  chemoradiotherapy: (KEE-moh-RAY-dee-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "chemoradiotherapy"
    Treatment that combines chemotherapy with radiation therapy. Also called chemoradiation.
  chemoreduction: (KEE-moh-ree-DUK-shun)
    Pronunciation of dictionary term "chemoreduction"
    Chemotherapy given to shrink a retinoblastoma tumor before treatment with radiation or surgery. It is a type of neoadjuvant therapy.
  chemosensitivity: (KEE-moh-SEN-sih-TIH-vih-tee)
    Pronunciation of dictionary term "chemosensitivity"
    The susceptibility of tumor cells to the cell-killing effects of anticancer drugs.
  chemosensitivity assay: (KEE-moh-SEN-sih-TIH-vih-tee A-say)
    Pronunciation of dictionary term "chemosensitivity assay"
    A laboratory test that measures the number of tumor cells that are killed by a cancer drug. The test is done after the tumor cells are removed from the body. A chemosensitivity assay may help in choosing the best drug or drugs for the cancer being treated.
  chemosensitizer: (KEE-moh-SEN-sih-TY-zer)
    Pronunciation of dictionary term "chemosensitizer"
    A drug that makes tumor cells more sensitive to the effects of chemotherapy.
  chemotherapeutic agent: (KEE-moh-THAYR-uh-PYOO-tik AY-jent)
    Pronunciation of dictionary term "chemotherapeutic agent"
    A drug used to treat cancer.
  chemotherapy: (KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "chemotherapy"
    Treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy may be given by mouth, injection, or infusion, or on the skin, depending on the type and stage of the cancer being treated. It may be given alone or with other treatments, such as surgery, radiation therapy, or biologic therapy.
    More Information
    - Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
    - Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy?redirect=true)
  chest wall: The skin, fat, muscles, bones, and other tissues that form a protective structure around vital organs in the area between the neck and the abdomen, including the heart, major blood vessels, lungs, and liver. The bones in the chest wall include the ribs, sternum (breastbone), and spine. The chest wall also helps support breathing and movement of the upper arms and shoulders.
  chest x-ray: (chest EX-ray)
    Pronunciation of dictionary term "chest x-ray"
    An x-ray of the structures and organs inside the chest. An x-ray is a type of high-energy radiation that can pass through the body and onto film or a computer, making pictures of areas inside the body. A chest x-ray may be used to help diagnose injuries or diseases that affect the chest.
    A chest x-ray is used to take pictures of the structures and organs inside the chest. X-rays pass through the patient's body onto film or a computer.
    Chest x-ray; drawing shows a patient standing with their back to the x-ray machine. X-rays pass through the patient's body onto film or a computer and take pictures of the structures and organs inside the chest.
  chewing tobacco: (CHOO-ing tuh-BA-koh)
    Pronunciation of dictionary term "chewing tobacco"
    A type of smokeless tobacco made from cured tobacco leaves. It may be sweetened and flavored with licorice and other substances. It comes in the form of loose tobacco leaves, pellets or “bits” (leaf tobacco rolled into small pellets), plugs (leaf tobacco pressed and held together with some type of sweetener), or twists (leaf tobacco rolled into rope-like strands and twisted). It is placed in the mouth, usually between the cheek and lower lip, and may be chewed. Chewing tobacco contains nicotine and many harmful, cancer-causing chemicals. Using it can lead to nicotine addiction and can cause cancers of the mouth, throat, esophagus, and pancreas. Chewing tobacco use may also cause gum disease, heart disease, stroke, and other health problems. Also called spit tobacco.
    More Information
    - Smokeless Tobacco and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/smokeless-fact-sheet)
  CHF: A condition in which the heart has trouble pumping blood through the body. It may develop over a long period of time. Symptoms include shortness of breath, problems exercising, fatigue, and swelling of the feet, ankles, and abdomen. CHF may be caused by coronary artery disease, a heart attack, or high blood pressure. It usually occurs in people aged 65 years or older. Also called chronic heart failure.
  chiasma: (ky-AZ-muh)
    Pronunciation of dictionary term "chiasma"
    An anatomy term for an X-shaped crossing (for example, of nerves or tendons).
  chickenpox: (CHIH-ken-pox)
    Pronunciation of dictionary term "chickenpox"
    A highly contagious disease marked by an itchy, blister-like rash caused by the varicella-zoster virus (a type of herpesvirus). The virus is easily spread from person to person through contact with mucus, saliva, or fluid from the blisters of an infected person or through droplets released when an infected person coughs or sneezes. The rash usually appears first on the face, chest, and back and then spreads to the rest of the body. Other symptoms may include fever, headache, fatigue, and loss of appetite. Chickenpox can sometimes cause serious health problems, especially in infants, teenagers, adults, pregnant women, and those who have a weakened immune system. Widespread use of the chickenpox vaccine since the early 1990s has prevented most cases of chickenpox in the United States. Also called varicella.
  child-life specialist: (… SPEH-shuh-list)
    Pronunciation of dictionary term "child-life specialist"
    A health care professional who is trained in the emotional and developmental needs of children. A child-life specialist helps children and their families understand medical issues and gives psychological and emotional support. Also called child-life worker.
  child-life worker: (… WUR-ker)
    Pronunciation of dictionary term "child-life worker"
    A health care professional who is trained in the emotional and developmental needs of children. A child-life worker helps children and their families understand medical issues and gives psychological and emotional support. Also called child-life specialist.
  childhood acute lymphoblastic leukemia risk group system: (... uh-KYOOT LIM-foh-BLAS-tik loo-KEE-mee-uh risk groop SIS-tem)
    Pronunciation of dictionary term "childhood acute lymphoblastic leukemia risk group system"
    A way of grouping patients that is used to plan treatment for children with acute lymphoblastic leukemia. A risk group is based on the patient’s age and white blood cell count at diagnosis. Risk groups are described as either standard (low) risk or high risk. Other factors that affect the risk group include the type of leukemia cells, whether there are certain chromosome changes, and how quickly the leukemia responds to treatment.
  childhood cancer: (… KAN-ser)
    Pronunciation of dictionary term "childhood cancer"
    A term used to describe cancers that occur between birth and 14 years of age. Childhood cancers are very rare and may differ from adult cancers in the way they grow and spread, how they are treated, and how they respond to treatment. The most common types of childhood cancer are leukemia, brain and spinal cord tumors, lymphoma, neuroblastoma, Wilms tumor (a type of kidney cancer), retinoblastoma, and cancers of the bone and soft tissue. Also called pediatric cancer.
    More Information
    - Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
    - PDQ® Cancer Information Summaries: Pediatric Treatment (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment)
  Childhood Cancer Data Initiative: (… KAN-ser … ih-NIH-shuh-tiv)
    Pronunciation of dictionary term "Childhood Cancer Data Initiative"
    A large effort led by the National Cancer Institute to collect, analyze, and share information to address the burden of cancer in children, adolescents, and young adults. The three main goals of the Childhood Cancer Data Initiative are: (1) to collect data from every child, adolescent, and young adult diagnosed with cancer, (2) to create a national strategy of clinical and molecular testing to speed diagnosis and inform treatment for all types of childhood cancer, and (3) to develop a network of computer systems and programs that merge clinical care and research data to improve prevention, treatment, quality of life, and survivorship for childhood cancers. Also called CCDI.
    More Information
    - Childhood Cancer Data Initiative (CCDI) (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative)
  childhood cancer risk group: (… KAN-ser risk groop)
    Pronunciation of dictionary term "childhood cancer risk group"
    A group of children with cancer that has been formed based on certain characteristics of the children and their disease. These may include age at diagnosis, stage of cancer, and cancer biology. Risk groups may also be based on the chance of being cured or the chance that the cancer will come back. Childhood cancer risk groups are used to plan treatment and follow-up care for certain types of cancer, such as neuroblastoma and rhabdomyosarcoma. Risk groups may be described as low risk, intermediate risk, or high risk.
  Children's Oncology Group: (… on-KAH-loh-jee …)
    Pronunciation of dictionary term "Children's Oncology Group"
    A large group of researchers, hospitals, and cancer centers that get support from the National Cancer Institute (NCI) to study childhood cancers. The main goal of the Children's Oncology Group is to conduct clinical trials that test new ways to prevent, diagnose, and treat cancer in children and adolescents. These clinical trials also include supportive care and childhood cancer survivorship studies. The Children's Oncology Group has hospitals and cancer centers in the United States, Canada, Europe, Australia, and New Zealand. It is part of the National Clinical Trials Network (NCTN). Also called COG.
  chimeric: (ky-MEER-ik)
    Pronunciation of dictionary term "chimeric"
    Having parts of different origins. In medicine, refers to a person, organ, or tissue that contains cells with different genes than the rest of the person, organ, or tissue. This may happen because of a mutation (genetic change) that occurs during development, or as a result of a transplant of cells, organs, or tissues from another person or from a different species. In the laboratory, a chimeric protein can be made by combining two different genes. For example, a chimeric antibody is made by joining antibody genes from two different species, such as human and mouse.
  chimeric antigen receptor: (ky-MEER-ik AN-tih-jen reh-SEP-ter)
    Pronunciation of dictionary term "chimeric antigen receptor"
    A special receptor created in the laboratory that is designed to bind to certain proteins on cancer cells. The chimeric antigen receptor is then added to immune cells called T cells. This helps the T cells find and kill cancer cells that have the specific protein that the receptor is designed to bind. These changed T cells called chimeric antigen receptor T cells are then grown in large numbers in the laboratory and given to cancer patients. Chimeric antigen receptor T cells are being studied in the treatment of some types of cancer. Also called CAR.
  chimeric antigen receptor T-cell therapy: (ky-MEER-ik AN-tih-jen reh-SEP-ter T-sel THAYR-uh-pee)
    Pronunciation of dictionary term "chimeric antigen receptor T-cell therapy"
    A type of treatment in which a patient's T cells (a type of immune system cell) are changed in the laboratory so they will attack cancer cells. T cells are taken from a patient’s blood. Then the gene for a special receptor that binds to a certain protein on the patient’s cancer cells is added to the T cells in the laboratory. The special receptor is called a chimeric antigen receptor (CAR). Large numbers of the CAR T cells are grown in the laboratory and given to the patient by infusion. Chimeric antigen receptor T-cell therapy is used to treat certain blood cancers, and it is being studied in the treatment of other types of cancer. Also called CAR T-cell therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  chimerism: (KY-mer-ih-zum)
    Pronunciation of dictionary term "chimerism"
    A condition in which some cells or tissues in a person’s body contain at least two different sets of DNA. Chimerism can occur in different ways. One way it can occur is through an organ or stem cell transplant from another person (donor). After a stem cell transplant, the recipient has a mix of DNA from their own blood cells and DNA from the donor's transplanted cells. Another way chimerism can occur is through pregnancy, when some fetal cells are absorbed into the bloodstream of the pregnant person. The DNA from the fetal cells may remain in that person’s body tissues for many years after childbirth. Chimerism can also occur during a twin pregnancy when cells and genetic material are exchanged between twins or during early development when one twin absorbs cells from another twin who does not survive. Most people with chimerism rarely show visible signs and are unaware they have the condition. Chimerism is usually diagnosed through genetic testing.
  Chinese meridian theory: (chy-NEEZ meh-RIH-dee-un THEER-ee)
    Pronunciation of dictionary term "Chinese meridian theory"
    In traditional Chinese medicine, meridians are channels that form a network in the body, through which qi (vital energy) flows. Blocked qi causes pain or illness. The flow of qi is restored by using pressure, needles, suction, or heat at hundreds of specific points along the meridians.
  Chinese rhubarb: (chy-NEEZ ROO-barb)
    Pronunciation of dictionary term "Chinese rhubarb"
    The root of this plant has been used in some cultures to treat certain medical problems. It may have anti-inflammatory and anticancer effects. The scientific name is Rheum palmatum or Rheum officinale. Also called da-huang, Indian rhubarb, rhubarb, and Turkish rhubarb.
  CHIR-265: A substance being studied in the treatment of melanoma. CHIR-265 may block the growth of tumors and the growth of blood vessels from surrounding tissue to the tumor. It is a type of Raf kinase inhibitor and angiogenesis inhibitor.
  ChiRhoStim: (KY-roh-stim)
    Pronunciation of dictionary term "ChiRhoStim"
    A drug used to help diagnose gastrinomas (tumors that cause too much gastric acid to be made) and other problems with the pancreas. It is also used to increase secretions from the pancreas and to help identify a duct called the ampulla of Vater. ChiRhoStim is a form of secretin that is made in the laboratory. Secretin causes the pancreas, liver, and stomach to release substances that help digest food. Also called secretin human and synthetic human secretin.
  chiropractic therapy: (KY-roh-PRAK-tik THAYR-uh-pee)
    Pronunciation of dictionary term "chiropractic therapy"
    A type of therapy in which the hands are used to manipulate the spine or other parts of the body. Sometimes, heat and ice, relaxation techniques, exercise, and other treatments are also used. Chiropractic therapy may be used to treat conditions such as back pain, neck pain, headache, and hand or foot problems, and to improve overall health. It is a type of complementary and alternative medicine (CAM).
  chitin: (KY-tin)
    Pronunciation of dictionary term "chitin"
    A type of polysaccharide (sugar molecule) that is made by some plants and animals. The hard outer shell of shrimp, lobsters, and many insects is made of chitin.
  Chlamydophila psittaci: (kluh-mih-doh-FIH-luh see-TAH-chee)
    Pronunciation of dictionary term "Chlamydophila psittaci"
    A type of bacterium that can infect humans and animals. It spreads to humans from infected birds and can cause a lung infection called psittacosis. It may also cause an infection of the conjunctiva (the membrane that lines the eyelids and covers the white part of the eye). This may increase the risk of a type of lymphoma called ocular adnexa MALT lymphoma, which is a type of B-cell lymphoma.
  chlorambucil: (klor-AM-byoo-sil)
    Pronunciation of dictionary term "chlorambucil"
    A drug used to treat chronic lymphocytic leukemia, Hodgkin lymphoma, and certain types of non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Chlorambucil damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Leukeran.
    More Information
    - Chlorambucil (https://www.cancer.gov/about-cancer/treatment/drugs/chlorambucil)
  chlorambucil-prednisone: (klor-AM-byoo-sil-PRED-nih-sone)
    Pronunciation of dictionary term "chlorambucil/prednisone"
    A chemotherapy combination used to treat chronic lymphocytic leukemia (CLL). It includes the drugs chlorambucil hydrochloride and prednisone. Also called chlorambucil-prednisone regimen, CP, and CP regimen.
    More Information
    - CHLORAMBUCIL-PREDNISONE (https://www.cancer.gov/about-cancer/treatment/drugs/CHLORAMBUCIL-PREDNISONE)
  chlorambucil-prednisone regimen: (klor-AM-byoo-sil-PRED-nih-sone REH-jih-men)
    Pronunciation of dictionary term "chlorambucil/prednisone regimen"
    A chemotherapy combination used to treat chronic lymphocytic leukemia (CLL). It includes the drugs chlorambucil hydrochloride and prednisone. Also called chlorambucil-prednisone, CP, and CP regimen.
    More Information
    - CHLORAMBUCIL-PREDNISONE (https://www.cancer.gov/about-cancer/treatment/drugs/CHLORAMBUCIL-PREDNISONE)
  chlorine: (KLOR-een)
    Pronunciation of dictionary term "chlorine"
    A chemical used in manufacturing, as a bleach, and to kill bacteria and other organisms in water.
  chloroma: (kloh-ROH-muh)
    Pronunciation of dictionary term "chloroma"
    A rare type of cancer that is made up of myeloblasts (a type of immature white blood cell) and forms outside the bone marrow and blood. The tumor cells may look green when viewed under a microscope. Chloromas can occur anywhere in the body. They most commonly occur in people with acute myeloid leukemia or a myeloproliferative disorder. Also called extramedullary myeloid tumor, granulocytic sarcoma, and myeloid sarcoma.
  chloroquinoxaline sulfonamide: (KLOR-oh-kwih-NOK-sah-leen sul-FAH-nuh-MIDE)
    Pronunciation of dictionary term "chloroquinoxaline sulfonamide"
    A substance being studied in the treatment of cancer. It is a type of topoisomerase inhibitor. Also called CQS.
  chlorotoxin: (KLOR-oh-TOK-sin)
    Pronunciation of dictionary term "chlorotoxin"
    A substance being studied in the diagnosis and treatment of glioma (a type of brain cancer) and other types of cancer. It binds to cancer cells in the brain and peripheral nervous system and may keep them from spreading. Chlorotoxin comes from the venom of a type of scorpion. A form of chlorotoxin made in the laboratory is called TM-601. Chlorotoxin is a type of neurotoxin.
  cholangiocarcinoma: (koh-LAN-jee-oh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "cholangiocarcinoma"
    A rare cancer that forms in the bile ducts. A bile duct is a tube that carries bile (fluid made by the liver) between the liver and gallbladder and the small intestine. Intrahepatic cholangiocarcinoma is found inside the liver. Extrahepatic cholangiocarcinoma is found outside the liver. Also called bile duct cancer.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
    Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
  cholangiosarcoma: (koh-LAN-jee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "cholangiosarcoma"
    A tumor of the connective tissues of the bile ducts.
  cholecalciferol: (KOH-leh-kal-SIH-feh-rol)
    Pronunciation of dictionary term "cholecalciferol"
    A nutrient that the body needs in small amounts to function and stay healthy. Cholecalciferol helps the body use calcium and phosphorus to make strong bones and teeth. It is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, egg yolks, and dairy products. Skin exposed to sunshine can also make cholecalciferol. Not enough cholecalciferol can cause a bone disease called rickets. It is being studied in the prevention and treatment of some types of cancer. Also called vitamin D.
    More Information
    - Vitamin D and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/vitamin-d-fact-sheet)
  cholelith: (KOH-leh-lith)
    Pronunciation of dictionary term "cholelith"
    Solid material that forms in the gallbladder or common bile duct. Choleliths are made of cholesterol or other substances found in the gallbladder. They may occur as one large stone or as many small ones, and vary from the size of a golf ball to a grain of sand. Also called gallstone.
  cholestasis: (koh-leh-STAY-sis)
    Pronunciation of dictionary term "cholestasis"
    Any condition in which the release of bile from the liver is blocked. The blockage can occur in the liver (intrahepatic cholestasis) or in the bile ducts (extrahepatic cholestasis).
  cholesterol: (koh-LES-teh-rol)
    Pronunciation of dictionary term "cholesterol"
    A waxy, fat-like substance made in the liver, and found in the blood and in all cells of the body. Cholesterol is important for good health and is needed for making cell walls, tissues, hormones, vitamin D, and bile acid. Cholesterol also comes from eating foods taken from animals such as egg yolks, meat, and whole-milk dairy products. Too much cholesterol in the blood may build up in blood vessel walls, block blood flow to tissues and organs, and increase the risk of developing heart disease and stroke.
  choline: (KOH-leen)
    Pronunciation of dictionary term "choline"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Choline helps cells make membranes, make a neurotransmitter (a chemical that helps nerve cells communicate with other cells), and remove fat from the liver. It is found in whole milk, beef liver, eggs, soy foods, and peanuts. Choline is water-soluble (can dissolve in water) and must be taken in every day. Not enough choline can cause diseases of the heart and blood vessels and damage to the liver. A form of choline is being studied in the treatment of some types of cancer and to reduce pain and fever. Choline is also being studied together with vitamin B12 in the prevention and treatment of cancer.
  choline magnesium trisalicylate: (KOH-leen mag-NEE-see-um TRY-suh-LIH-sih-LAYT)
    Pronunciation of dictionary term "choline magnesium trisalicylate"
    A substance used to treat arthritis and relieve pain, inflammation, and fever. It is also being studied in the treatment of acute myeloid leukemia (AML). Choline magnesium trisalicylate blocks the action of a substance that sends a pain message to the brain. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called Trilisate.
  chondrocyte: (KON-droh-site)
    Pronunciation of dictionary term "chondrocyte"
    Cartilage cell. Chondrocytes make the structural components of cartilage.
  chondroitin sulfate: (kon-DROY-tin SUL-fayt)
    Pronunciation of dictionary term "chondroitin sulfate"
    The major glycosaminoglycan (a type of sugar molecule) in cartilage.
  chondroma: (kon-DROH-muh)
    Pronunciation of dictionary term "chondroma"
    A rare, slow-growing tumor that is made up of cartilage and forms on or in bones or soft tissue. It is not cancer. The tumor usually occurs in the hands or feet, but it may also occur in the upper arm, thigh, collarbone, ribs, pelvis, spine, skull, and nasal sinuses. Most chondromas do not cause symptoms, but pain, swelling, and broken bones can occur. Chondromas usually don’t spread to other parts of the body, but in rare cases they may become malignant (cancer). They can occur in both adults and children.
  chondrosarcoma: (KON-droh-sar-KOH-muh)
    Pronunciation of dictionary term "chondrosarcoma"
    A type of cancer that forms in bone cartilage. It usually starts in the pelvis (between the hip bones), the shoulder, the ribs, or at the ends of the long bones of the arms and legs. A rare type of chondrosarcoma called extraskeletal chondrosarcoma does not form in bone cartilage. Instead, it forms in the soft tissues of the upper part of the arms and legs. Chondrosarcoma can occur at any age but is more common in people older than 40 years. It is a type of bone cancer.
    More Information
    - Primary Bone Cancer (https://www.cancer.gov/types/bone/bone-fact-sheet)
  CHOP: An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin lymphoma and is being studied in the treatment of other types of cancer. It includes the drugs cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), vincristine sulfate (Oncovin), and prednisone. Also called CHOP regimen.
    More Information
    - CHOP (https://www.cancer.gov/about-cancer/treatment/drugs/CHOP)
  CHOP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CHOP regimen"
    An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin lymphoma and is being studied in the treatment of other types of cancer. It includes the drugs cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), vincristine sulfate (Oncovin), and prednisone. Also called CHOP.
    More Information
    - CHOP (https://www.cancer.gov/about-cancer/treatment/drugs/CHOP)
  CHOPE: An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin lymphoma. It includes the drugs cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), vincristine sulfate (Oncovin), prednisone, and etoposide phosphate. Also called CHOPE regimen.
  CHOPE regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CHOPE regimen"
    An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin lymphoma. It includes the drugs cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), vincristine sulfate (Oncovin), prednisone, and etoposide phosphate. Also called CHOPE.
  chordoma: (kor-DOH-muh)
    Pronunciation of dictionary term "chordoma"
    A type of bone cancer that usually starts in the lower spinal column or at the base of the skull.
    More Information
    - Chordoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-bone-tumors/chordoma)
    - Primary Bone Cancer (https://www.cancer.gov/types/bone/bone-fact-sheet)
  chorioadenoma destruens: (KOR-ee-oh-A-deh-NOH-muh des-TROO-ens)
    Pronunciation of dictionary term "chorioadenoma destruens"
    A type of cancer that grows into the muscular wall of the uterus. It is formed after conception (fertilization of an egg by a sperm). It may spread to other parts of the body, such as the vagina, vulva, and lung. Also called invasive hydatidiform mole.
  chorioallantoic membrane: (KOR-ee-oh-uh-lan-TOH-ik MEM-brayn)
    Pronunciation of dictionary term "chorioallantoic membrane"
    The membrane in hens' eggs that helps chicken embryos get enough oxygen and calcium for development. The calcium comes from the egg shell.
  chorioblastoma: (KOR-ee-oh-blas-TOH-muh)
    Pronunciation of dictionary term "chorioblastoma"
    A malignant, fast-growing tumor that develops from trophoblastic cells (cells that help an embryo attach to the uterus and help form the placenta). Almost all chorioblastomas form in the uterus after fertilization of an egg by a sperm, but a small number form in a testis or an ovary. Chorioblastomas spread through the blood to other organs, especially the lungs. They are a type of gestational trophoblastic disease. Also called choriocarcinoma, chorioepithelioma, and chorionic carcinoma.
  choriocarcinoma: (KOR-ee-oh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "choriocarcinoma"
    A malignant, fast-growing tumor that develops from trophoblastic cells (cells that help an embryo attach to the uterus and help form the placenta). Almost all choriocarcinomas form in the uterus after fertilization of an egg by a sperm, but a small number form in a testis or an ovary. Choriocarcinomas spread through the blood to other organs, especially the lungs. They are a type of gestational trophoblastic disease. Also called chorioblastoma, chorioepithelioma, and chorionic carcinoma.
  chorioepithelioma: (KOR-ee-oh-EH-pih-THEE-lee-OH-muh)
    Pronunciation of dictionary term "chorioepithelioma"
    A malignant, fast-growing tumor that develops from trophoblastic cells (cells that help an embryo attach to the uterus and help form the placenta). Almost all chorioepitheliomas form in the uterus after fertilization of an egg by a sperm, but a small number form in a testis or an ovary. Chorioepitheliomas spread through the blood to other organs, especially the lungs. They are a type of gestational trophoblastic disease. Also called chorioblastoma, choriocarcinoma, and chorionic carcinoma.
  chorionic carcinoma: (KOR-ee-AH-nik KAR-sih-NOH-muh)
    Pronunciation of dictionary term "chorionic carcinoma"
    A malignant, fast-growing tumor that develops from trophoblastic cells (cells that help an embryo attach to the uterus and help form the placenta). Almost all chorionic carcinomas form in the uterus after fertilization of an egg by a sperm, but a small number form in a testis or an ovary. Chorionic carcinomas spread through the blood to other organs, especially the lungs. They are a type of gestational trophoblastic disease. Also called chorioblastoma, choriocarcinoma, and chorioepithelioma.
  choroid: (KOR-oyd)
    Pronunciation of dictionary term "choroid"
    A thin layer of tissue that is part of the middle layer of the wall of the eye, between the sclera (white outer layer of the eye) and the retina (the inner layer of nerve tissue at the back of the eye). The choriod is filled with blood vessels that bring oxygen and nutrients to the eye.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  choroid plexus: (KOR-oyd PLEK-sus)
    Pronunciation of dictionary term "choroid plexus"
    A network of blood vessels and cells in the ventricles (fluid-filled spaces) of the brain. The blood vessels are covered by a thin layer of cells that make cerebrospinal fluid.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  choroid plexus tumor: (KOR-oyd PLEK-sus TOO-mer)
    Pronunciation of dictionary term "choroid plexus tumor"
    A rare tumor that forms in the choroid plexus (a network of blood vessels and cells in the fluid-filled spaces of the brain). These tumors are most common in children younger than 2 years. Choroid plexus tumors may be benign (not cancer) or malignant (cancer).
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  CHPP: A treatment used during surgery in which a heated solution containing anticancer drugs is infused directly into the abdominal cavity through a thin tube. After removal of as much tumor tissue as possible with surgery, CHPP is given to kill any remaining tumor cells. It is most often used to treat cancers that have spread to the peritoneum (the lining of the abdominal cavity). Also called continuous hyperthermic peritoneal perfusion, HIPEC, and hyperthermic intraperitoneal chemotherapy.
  chromaffin cell: (KROH-muh-fin ...)
    Pronunciation of dictionary term "chromaffin cell"
    A type of cell that makes neurohormones (chemicals that are made by nerve cells and used to send signals to other cells) and releases them into the blood. Chromaffin cells make epinephrine (adrenaline) and norepinephrine (noradrenaline). They are found in the adrenal glands or in groups of nerve cells called ganglia.
  chromatin: (KROH-muh-tin)
    Pronunciation of dictionary term "chromatin"
    A highly organized condensed structure made up of DNA, RNA, and proteins that forms the chromosomes in the nucleus of a cell. Chromatin is formed when long strands of DNA molecules wrap around spool-like complexes of proteins called histones to form structures that resemble beads on a string called nucleosomes. The nucleosomes then fold tightly around each other to form a chromatin fiber that further condenses to form chromosomes. Chromatin allows the DNA to fit inside the cell’s nucleus and allows many important cell processes to occur, including DNA replication, transcription, DNA repair, genetic recombination, and cell division.
    More Information
    - Chromatin (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Chromatin)
  chromatography: (KROH-muh-TAH-gruh-fee)
    Pronunciation of dictionary term "chromatography"
    A laboratory technique used to separate different substances in a mixture. A gas or a liquid is used to pass the mixture through a column, paper, or special plate that contains absorbing materials. The substances in the mixture are separated based on how far they move through the material. The different substances may be visible to the eye or detected by a special machine.
  chromogranin A: (KROH-moh-GRA-nin …)
    Pronunciation of dictionary term "chromogranin A"
    A protein found inside neuroendocrine cells, which release chromogranin A and certain hormones into the blood. Chromogranin A may be found in higher than normal amounts in patients with certain neuroendocrine tumors, small cell lung cancer, prostate cancer, and other conditions. Measuring the amount of chromogranin A in the blood may help to diagnose cancer or other conditions or find out how well treatment is working or if cancer has come back. Chromogranin A is a type of tumor marker. Also called CgA.
  chromosome: (KROH-muh-some)
    Pronunciation of dictionary term "chromosome"
    Part of a cell that contains genetic information. Except for sperm and eggs, all human cells contain 46 chromosomes.
    More Information
    - Chromosome (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Chromosome)
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  chromosome 17: (KROH-muh-some …)
    Pronunciation of dictionary term "chromosome 17"
    One of a pair of chromosomes that is part of the 46 chromosomes found in the nucleus of most human cells. Specific changes in chromosome 17 may be found in patients with certain genetic conditions and some types of cancer, including bladder cancer, brain cancer, and leukemia. Checking for these changes may help diagnose cancer or find out if cancer has come back. Chromosome 17 is a type of tumor marker.
    More Information
    - Chromosome (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Chromosome)
  chromosome 17p deletion: (KROH-muh-some … deh-LEE-shun)
    Pronunciation of dictionary term "chromosome 17p deletion"
    The loss of all or part of the short arm (also called the p arm) of chromosome 17. The chromosome 17p deletion leads to the loss of the tumor suppressor gene TP53, which is linked to many genetic conditions and some types of cancer, such as leukemia, multiple myeloma, and myelodysplastic syndrome. Checking for the chromosome 17p deletion may help diagnose cancer, plan treatment, or make a prognosis. Also called 17p deletion and deletion 17p.
  chromosome 3: (KROH-muh-some …)
    Pronunciation of dictionary term "chromosome 3"
    One of a pair of chromosomes that is part of the 46 chromosomes found in the nucleus of most human cells. Specific changes in chromosome 3 may be found in patients with certain genetic conditions or some types of cancer, including bladder cancer. Checking for these changes may help diagnose cancer or find out if cancer has come back. Chromosome 3 is a type of tumor marker.
    More Information
    - Chromosome (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Chromosome?id=33)
  chromosome 7: (KROH-muh-some …)
    Pronunciation of dictionary term "chromosome 7"
    One of a pair of chromosomes that is part of the 46 chromosomes found in the nucleus of most human cells. Specific changes in chromosome 7 may be found in patients with certain genetic conditions or some types of cancer, including bladder cancer, leukemia, and lymphoma. Checking for these changes may help diagnose cancer or find out if cancer has come back. Chromosome 7 is a type of tumor marker.
    More Information
    - Chromosome (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Chromosome?id=33)
  chronic bacterial prostatitis: (KRAH-nik bak-TEER-ee-ul PROS-tuh-TY-tis)
    Pronunciation of dictionary term "chronic bacterial prostatitis"
    Inflammation of the prostate gland that is caused by a bacterial infection and that continues or gets worse over a long period of time. The infection may seem to go away but keeps coming back. Symptoms include body aches, pain in the lower back and genital area, a burning feeling during urination, and problems with emptying the bladder all the way.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  chronic bronchitis: (KRAH-nik bron-KY-tis)
    Pronunciation of dictionary term "chronic bronchitis"
    A lung condition that develops over time in which the bronchi (large air passages that lead to the lungs) become inflamed and scarred. This causes the bronchi to make large amounts of mucus and can lead to a chronic cough and breathing problems. The most common cause of chronic bronchitis is cigarette smoking. It may also be caused by infection or by breathing in secondhand tobacco smoke, chemical fumes, or other forms of air pollution. Chronic bronchitis usually does not go away completely. It is a type of chronic obstructive pulmonary disease (COPD).
  chronic cough: (KRAH-nik kof)
    Pronunciation of dictionary term "chronic cough"
    A cough that lasts for 8 weeks or longer. It may occur with other symptoms, including a runny or stuffy nose, extra mucus in the back of the throat, wheezing, shortness of breath, or heartburn. A chronic cough may be caused by allergies, sinus infections, asthma, gastroesophageal reflux disease (GERD), or other conditions. It may also be caused by smoking tobacco or by breathing in secondhand tobacco smoke over a long period of time. It usually improves when the problem that caused the cough is treated. For example, a chronic cough may get better when a person quits smoking.
    More Information
    - Cardiopulmonary Syndromes
  chronic disease: (KRAH-nik dih-ZEEZ)
    Pronunciation of dictionary term "chronic disease"
    A disease or condition that usually lasts for 3 months or longer and may get worse over time. Chronic diseases tend to occur in older adults and can usually be controlled but not cured. The most common types of chronic disease are cancer, heart disease, stroke, diabetes, and arthritis.
  chronic eosinophilic leukemia: (KRAH-nik EE-oh-SIH-noh-FIH-lik loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic eosinophilic leukemia"
    A disease in which too many eosinophils (a type of white blood cell) are found in the bone marrow, blood, and other tissues. Chronic eosinophilic leukemia may stay the same for many years, or it may progress quickly to acute leukemia.
  chronic fatigue syndrome: (KRAH-nik fuh-TEEG SIN-drome)
    Pronunciation of dictionary term "chronic fatigue syndrome"
    A condition that lasts for more than 6 months in which a person feels tired most of the time. They may also have trouble concentrating and carrying out daily activities. Other symptoms include sore throat, fever, muscle weakness, headache, and joint pain. Also called CFS.
  chronic granulocytic leukemia: (KRAH-nik GRAN-yoo-loh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic granulocytic leukemia"
    An indolent (slow-growing) cancer in which too many myeloblasts are found in the blood and bone marrow. Myeloblasts are a type of immature blood cell that makes white blood cells called myeloid cells. Chronic granulocytic leukemia may get worse over time as the number of myeloblasts increases in the blood and bone marrow. This may cause fever, fatigue, easy bleeding, anemia, infection, a swollen spleen, bone pain, or other signs and symptoms. Chronic granulocytic leukemia is usually marked by a chromosome change called the Philadelphia chromosome, in which a piece of chromosome 9 and a piece of chromosome 22 break off and trade places with each other. It usually occurs in older adults and rarely occurs in children. Also called chronic myelogenous leukemia, chronic myeloid leukemia, and CML.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  chronic heart failure: (KRAH-nik hart FAYL-yer)
    Pronunciation of dictionary term "chronic heart failure"
    A condition in which the heart has trouble pumping blood through the body. It may develop over a long period of time. Symptoms include shortness of breath, problems exercising, fatigue, and swelling of the feet, ankles, and abdomen. Chronic heart failure may be caused by coronary artery disease, a heart attack, or high blood pressure. It usually occurs in people aged 65 years or older. Also called CHF.
  chronic idiopathic myelofibrosis: (KRAH-nik IH-dee-oh-PA-thik MY-eh-loh-fy-BROH-sis)
    Pronunciation of dictionary term "chronic idiopathic myelofibrosis"
    A progressive, chronic disease in which the bone marrow is replaced by fibrous tissue and blood is made in organs such as the liver and the spleen, instead of in the bone marrow. This disease is marked by an enlarged spleen and progressive anemia. Also called agnogenic myeloid metaplasia, idiopathic myelofibrosis, myelosclerosis with myeloid metaplasia, and primary myelofibrosis.
  chronic kidney disease: (KRAH-nik KID-nee dih-ZEEZ)
    Pronunciation of dictionary term "chronic kidney disease"
    A condition in which the kidneys become damaged slowly over time and are not able to remove waste products and extra water from the blood to make urine. This can cause an imbalance of important minerals and chemicals in the body. Chronic kidney disease usually gets worse over time and can lead to kidney failure and other health problems, such as heart disease, stroke, anemia, bone disease, and malnutrition. Most people with chronic kidney disease do not have symptoms until the disease is very advanced. The two most common causes of chronic kidney disease are diabetes and high blood pressure. Other risk factors include heart disease, obesity, smoking, older age, and having a family history of kidney disease or failure. There is no cure for chronic kidney disease, but certain medicines, such as those that lower blood pressure or manage blood sugar levels, and healthy behaviors, such as eating a healthy diet, exercising regularly, losing extra weight, and quitting smoking, can help manage the disease. Chronic kidney disease is common among adults in the United States. Also called CKD.
    More Information
    - Chronic kidney disease (MedlinePlus) (https://medlineplus.gov/ency/article/000471.htm)
    - Chronic Kidney Disease (CKD) (https://www.niddk.nih.gov/health-information/kidney-disease/chronic-kidney-disease-ckd)
  chronic leukemia: (KRAH-nik loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic leukemia"
    A slowly progressing cancer that starts in blood-forming tissues such as the bone marrow, and causes large numbers of white blood cells to be produced and enter the blood stream.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  chronic lung disease: (KRAH-nik … dih-ZEEZ)
    Pronunciation of dictionary term "chronic lung disease"
    A type of disorder that affects the lungs and other parts of the respiratory system. It usually develops slowly and may get worse over time. Chronic lung disease may be caused by smoking tobacco or by breathing in secondhand tobacco smoke, chemical fumes, dust, or other forms of air pollution. Types of chronic lung disease include asthma, chronic obstructive pulmonary disease (COPD), pulmonary fibrosis, asbestosis, pneumonitis, and other lung conditions. Also called CLD.
  chronic lymphocytic leukemia: (KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic lymphocytic leukemia"
    An indolent (slow-growing) cancer in which too many immature lymphocytes (white blood cells) are found mostly in the blood and bone marrow. Sometimes, in later stages of the disease, cancer cells are found in the lymph nodes and the disease is called small lymphocytic lymphoma. Also called CLL.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  chronic lymphocytic leukemia/small lymphocytic lymphoma: (KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh/… LIM-foh-SIH-tik lim-FOH-muh)
    Pronunciation of dictionary term "chronic lymphocytic leukemia/small lymphocytic lymphoma"
    An indolent (slow-growing) cancer in which immature lymphocytes (white blood cells) are found in the blood and bone marrow and/or in the lymph nodes. Chronic lymphocytic leukemia (CLL) and small lymphocytic lymphoma (SLL) are the same disease, but in CLL cancer cells are found mostly in the blood and bone marrow. In SLL cancer cells are found mostly in the lymph nodes. Chronic lymphocytic leukemia/small lymphocytic lymphoma is a type of non-Hodgkin lymphoma. Also called CLL/SLL.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  chronic myelogenous leukemia: (KRAH-nik MY-eh-LAH-jeh-nus loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic myelogenous leukemia"
    An indolent (slow-growing) cancer in which too many myeloblasts are found in the blood and bone marrow. Myeloblasts are a type of immature blood cell that makes white blood cells called myeloid cells. Chronic myelogenous leukemia may get worse over time as the number of myeloblasts increases in the blood and bone marrow. This may cause fever, fatigue, easy bleeding, anemia, infection, a swollen spleen, bone pain, or other signs and symptoms. Chronic myelogenous leukemia is usually marked by a chromosome change called the Philadelphia chromosome, in which a piece of chromosome 9 and a piece of chromosome 22 break off and trade places with each other. It usually occurs in older adults and rarely occurs in children. Also called chronic granulocytic leukemia, chronic myeloid leukemia, and CML.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  chronic myeloid leukemia: (KRAH-nik MY-eh-loyd loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic myeloid leukemia"
    An indolent (slow-growing) cancer in which too many myeloblasts are found in the blood and bone marrow. Myeloblasts are a type of immature blood cell that makes white blood cells called myeloid cells. Chronic myeloid leukemia may get worse over time as the number of myeloblasts increases in the blood and bone marrow. This may cause fever, fatigue, easy bleeding, anemia, infection, a swollen spleen, bone pain, or other signs and symptoms. Chronic myeloid leukemia is usually marked by a chromosome change called the Philadelphia chromosome, in which a piece of chromosome 9 and a piece of chromosome 22 break off and trade places with each other. It usually occurs in older adults and rarely occurs in children. Also called chronic granulocytic leukemia, chronic myelogenous leukemia, and CML.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  chronic myelomonocytic leukemia: (KRAH-nik MY-eh-loh-MAH-noh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic myelomonocytic leukemia"
    A slowly progressing type of myelodysplastic/myeloproliferative disease in which too many myelomonocytes (a type of white blood cell) are in the bone marrow, crowding out other normal blood cells, such as other white blood cells, red blood cells, and platelets. Also called CMML.
  chronic myeloproliferative neoplasm: (KRAH-nik MY-eh-loh-proh-LIH-feh-ruh-tiv NEE-oh-PLA-zum)
    Pronunciation of dictionary term "chronic myeloproliferative neoplasm"
    A type of disease in which the bone marrow makes too many red blood cells, platelets, or certain white blood cells. Chronic myeloproliferative neoplasms usually get worse over time as the number of extra cells build up in the blood and/or bone marrow. This may cause bleeding problems, anemia, infection, fatigue, or other signs and symptoms. Certain chronic myeloproliferative neoplasms may become acute myeloid leukemia (AML). Chronic myeloproliferative neoplasms include chronic myelogenous leukemia (CML), polycythemia vera, primary myelofibrosis, essential thrombocythemia, chronic neutrophilic leukemia, and chronic eosinophilic leukemia. Also called myeloproliferative neoplasm.
    More Information
    - Myeloproliferative Neoplasms (https://www.cancer.gov/types/myeloproliferative)
  chronic neutrophilic leukemia: (KRAH-nik NOO-troh-FIH-lik loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic neutrophilic leukemia"
    A disease in which too many neutrophils (a type of white blood cell) are found in the blood. The extra neutrophils may cause the spleen and liver to become enlarged. Chronic neutrophilic leukemia may stay the same for many years or it may progress quickly to acute leukemia.
  chronic obstructive pulmonary disease: (KRAH-nik ub-STRUK-tiv PUL-muh-NAYR-ee dih-ZEEZ)
    Pronunciation of dictionary term "chronic obstructive pulmonary disease"
    A type of lung disease marked by permanent damage to tissues in the lungs, making it hard to breathe. Chronic obstructive pulmonary disease includes chronic bronchitis, in which the bronchi (large air passages) are inflamed and scarred, and emphysema, in which the alveoli (tiny air sacs) are damaged. It develops over many years and is usually caused by cigarette smoking. Also called COPD.
  chronic pain: (KRAH-nik payn)
    Pronunciation of dictionary term "chronic pain"
    Pain that can range from mild to severe, and persists or progresses over a long period of time.
    More Information
    - Pain in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
    - Cancer Pain
  chronic phase: (KRAH-nik fayz)
    Pronunciation of dictionary term "chronic phase"
    Refers to the early stages of chronic myelogenous leukemia or chronic lymphocytic leukemia. The number of mature and immature abnormal white blood cells in the bone marrow and blood is higher than normal, but lower than in the accelerated or blast phase.
  chronic phase chronic myelogenous leukemia: (KRAH-nik fayz KRAH-nik MY-eh-LAH-jeh-nus loo-KEE-mee-uh)
    Pronunciation of dictionary term "chronic phase chronic myelogenous leukemia"
    A phase of chronic myelogenous leukemia in which fewer than 10% of the cells in the blood and bone marrow are blast cells (immature blood cells). This phase may last from several months to several years, and there may be no symptoms of leukemia.
  chronic prostatitis/chronic pelvic pain syndrome: (KRAH-nik PROS-tuh-TY-tis/KRAH-nik PEL-vik payn SIN-drome)
    Pronunciation of dictionary term "chronic prostatitis/chronic pelvic pain syndrome"
    A condition of the prostate gland that continues or gets worse over a long period of time. Symptoms include body aches, pain in the lower back and genital area, a burning feeling during urination, and problems with emptying the bladder all the way. Also called CP/CPPS.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  chrysotherapy: (KRIH-soh-THAYR-uh-pee)
    Pronunciation of dictionary term "chrysotherapy"
    A procedure that uses gold salts (a salt form of the metal element gold) to treat diseases, such as rheumatoid arthritis. The gold salts stop cells from releasing chemicals that can harm tissues. Also called aurotherapy and gold therapy.
  CHS 828: A drug that is being studied in the treatment of solid tumors.
  chyle: (kile)
    Pronunciation of dictionary term "chyle"
    A milky-white fluid that forms in the small intestine during digestion. It is made of lymph fluid and fats. Special lymph vessels carry chyle from the intestines to the blood.
  CI-1033: A substance being studied in the treatment of some types of cancer. CI-1033 blocks the action of proteins called epidermal growth factor receptors, and may cause cancer cells to die. It is a type of tyrosine kinase inhibitor. Also called canertinib dihydrochloride.
  CI-958: A substance being studied in the treatment of some types of cancer. CI-958 binds to DNA and stops cells, including cancer cells, from repairing damage to DNA and from making more DNA, RNA, and protein. It is a type of DNA intercalator. Also called sedoxantrone trihydrochloride.
  CI-980: An anticancer drug that belongs to the family of drugs called mitotic inhibitors. Also called mivobulin isethionate.
  CI-994: A substance being studied in the treatment of non-small cell lung cancer. Also called N-acetyldinaline.
  Cialis: (see-A-lis)
    Pronunciation of dictionary term "Cialis"
    A drug used to treat erectile dysfunction. It is also being studied in the treatment of sexual problems in patients treated with radiation or surgery for prostate cancer. Cialis blocks the action of a certain enzyme, which can result in increased blood flow to the penis, causing an erection. It is a type of cGMP phosphodiesterase type 5 (PDE5) inhibitor. Also called tadalafil.
  cidofovir: (sy-DOH-foh-veer)
    Pronunciation of dictionary term "cidofovir"
    A drug used in the treatment of infections caused by viruses.
  cigar: (sih-GAR)
    Pronunciation of dictionary term "cigar"
    A tube-shaped tobacco product that is made of tightly rolled, cured tobacco leaves in a tobacco leaf wrapper or a wrapper that contains tobacco. It may also have other ingredients, including substances to add different flavors. A cigar is lit on one end and smoked, but the smoke is usually not inhaled into the lungs. Cigars contain nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Smoking cigars can lead to nicotine addiction and can cause cancers of the mouth, larynx (voice box), esophagus, lung, and pancreas. Heavy cigar smoking can also increase the risk of heart disease and lung diseases, such as emphysema and chronic bronchitis.
    More Information
    - Cigar Smoking and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/cigars-fact-sheet)
  cigarette: (SIH-guh-ret)
    Pronunciation of dictionary term "cigarette"
    A tube-shaped tobacco product that is made of finely cut, cured tobacco leaves wrapped in thin paper. It may also have other ingredients, including substances to add different flavors. A cigarette is lit on one end and smoked, and the smoke is usually inhaled into the lungs. Cigarettes contain nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Smoking cigarettes can lead to nicotine addiction and can cause many types of cancer, including cancers of the lung, larynx, mouth, esophagus, throat, kidney, bladder, pancreas, stomach, and cervix, and acute myeloid leukemia. Smoking cigarettes also causes other health problems, including heart disease, stroke, and lung diseases, such as emphysema and chronic bronchitis.
    More Information
    - Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco)
  cilengitide: (sy-LEN-gih-tide)
    Pronunciation of dictionary term "cilengitide"
    A substance that is being studied as an anticancer and antiangiogenesis drug. Also called EMD 121974.
  ciliary body: (SIH-lee-ayr-ee BAH-dee)
    Pronunciation of dictionary term "ciliary body"
    A part of the middle layer of the wall of the eye. The ciliary body is found behind the iris and includes the ring-shaped muscle that changes the shape of the lens when the eye focuses. It also makes the clear fluid that fills the space between the cornea and the iris.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  ciltacabtagene autoleucel: (SIL-tuh-KAB-tuh-jeen AW-toh-LOO-sel)
    Pronunciation of dictionary term "ciltacabtagene autoleucel"
    A treatment used for adults with multiple myeloma that came back or did not get better after treatment with at least one line of anticancer therapy that included a proteasome inhibitor and an immunomodulating agent. It is used in patients whose cancer did not respond to treatment with lenalidomide. Ciltacabtagene autoleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Ciltacabtagene autoleucel binds to a protein called BCMA, which is found on myeloma cells and some types of immune cells. This helps the body’s immune system kill cancer cells. Ciltacabtagene autoleucel is a type of cellular immunotherapy called CAR T-cell therapy. Also called Carvykti.
    More Information
    - Ciltacabtagene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/ciltacabtagene-autoleucel)
  cimetidine: (sy-MEH-tih-deen)
    Pronunciation of dictionary term "cimetidine"
    A drug usually used to treat stomach ulcers and heartburn. It is also commonly used in a regimen to prevent allergic reactions.
  CIN: A term used to describe abnormal cells that are found on the surface of the cervix when a biopsy is done. CIN is usually caused by infection with certain types of human papillomavirus (HPV). CIN is not cancer but may become cancer and spread to nearby normal tissue. It is graded on a scale of 1 to 3, based on how abnormal the cells look under a microscope and how much of the cervical tissue is affected. For example, CIN 1 has slightly abnormal cells and is less likely to become cancer than CIN 2 or CIN 3. CIN is sometimes called cervical dysplasia. Also called cervical intraepithelial neoplasia.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  CIN 1: A cervical biopsy finding that means slightly abnormal cells were found on the surface of the cervix. CIN 1 is usually caused by infection with certain types of human papillomavirus (HPV). CIN 1 is not cancer and usually goes away on its own without treatment, but sometimes it can become cancer and spread to nearby normal tissue. CIN 1 is sometimes called low-grade or mild dysplasia. Also called cervical squamous intraepithelial neoplasia 1.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  CIN 2: A cervical biopsy finding that means moderately abnormal cells were found on the surface of the cervix. CIN 2 is usually caused by infection with certain types of human papillomavirus (HPV). CIN 2 is not cancer but may become cancer and spread to nearby normal tissue if not treated. Treatment for CIN 2 may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. CIN 2 is sometimes called high-grade or moderate dysplasia. Also called cervical squamous intraepithelial neoplasia 2.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  CIN 2/3: A cervical biopsy finding that means a mix of moderately abnormal and severely abnormal cells were found on the surface of the cervix. CIN 2/3 has features of both CIN 2 and CIN 3. It is usually caused by infection with certain types of human papillomavirus (HPV). CIN 2/3 is not cancer but may become cancer and spread to nearby normal tissue if not treated. Treatment for CIN 2/3 may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. Also called cervical squamous intraepithelial neoplasia 2/3.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  CIN 3: A cervical biopsy finding that means severely abnormal cells were found on the surface of the cervix. CIN 3 is usually caused by infection with certain types of human papillomavirus (HPV). CIN 3 is not cancer but may become cancer and spread to nearby normal tissue if not treated. Treatment for CIN 3 may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. CIN 3 is sometimes called high-grade or severe dysplasia. Also called cervical squamous intraepithelial neoplasia 3.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  Cinvanti: (sin-VAN-tee)
    Pronunciation of dictionary term "Cinvanti"
    A drug used with other drugs to prevent nausea and vomiting caused by chemotherapy and nausea and vomiting after surgery. Cinvanti blocks the action of a certain chemical in the central nervous system that may trigger nausea and vomiting. Blocking this chemical may help lessen nausea and vomiting. Cinvanti is a type of antiemetic and a type of substance P/neurokinin 1 receptor antagonist. Also called aprepitant and Emend.
    More Information
    - Aprepitant (https://www.cancer.gov/about-cancer/treatment/drugs/aprepitant)
  Cipro: (SIP-roh)
    Pronunciation of dictionary term "Cipro"
    A drug that is used to treat infections caused by bacteria and is being studied in the treatment of bladder cancer. Cipro is a type of fluoroquinolone. Also called ciprofloxacin.
  ciprofloxacin: (SIH-proh-FLOK-suh-sin)
    Pronunciation of dictionary term "ciprofloxacin"
    A drug that is used to treat infections caused by bacteria and is being studied in the treatment of bladder cancer. Ciprofloxacin is a type of fluoroquinolone. Also called Cipro.
  circadian rhythm: (sir-KAY-dee-un RIH-thum)
    Pronunciation of dictionary term "circadian rhythm"
    The natural cycle of physical, mental, and behavior changes that the body goes through in a 24-hour cycle. Circadian rhythms are mostly affected by light and darkness and are controlled by a small area in the middle of the brain. They can affect sleep, body temperature, hormones, appetite, and other body functions. Abnormal circadian rhythms may be linked to obesity, diabetes, depression, bipolar disorder, seasonal affective disorder, and sleep disorders such as insomnia. Circadian rhythm is sometimes called the “body’s clock.”
  circulating tumor cell: (SER-kyoo-LAY-ting TOO-mer sel)
    Pronunciation of dictionary term "circulating tumor cell"
    A cancer cell that breaks away from the original (primary) tumor and enters the bloodstream. Circulating tumor cells can travel through the blood and form new tumors in other parts of the body. A sample of blood can be used to detect circulating tumor cells and learn more about the primary tumor. Circulating tumor cells are being used as a biomarker in some types of cancer to help plan treatment or make a likely prognosis. Also called CTC.
  circulating tumor DNA: (SER-kyoo-LAY-ting TOO-mer …)
    Pronunciation of dictionary term "circulating tumor DNA"
    Small pieces of DNA that are released into a person’s blood by tumor cells as they die. A sample of blood can be used to look for and measure the amount of circulating tumor DNA and identify specific mutations (changes) in the DNA. Circulating tumor DNA is being used as a biomarker to help diagnose some types of cancer, to help plan treatment, or to find out how well treatment is working or if cancer has come back. Also called ctDNA.
  circulating tumor marker: (SER-kyoo-LAY-ting TOO-mer MAR-ker)
    Pronunciation of dictionary term "circulating tumor marker"
    A substance, such as a protein or fragment of DNA, that is released into a person’s blood, urine, other body fluid, or stool by tumor cells or other cells of the body. Circulating tumor markers may be a sign of cancer or certain benign (noncancer) conditions. Measurements of circulating tumor marker levels in blood or other body fluid may be used along with results of other tests, such as biopsies and imaging, to help diagnose some types of cancer. Knowing the levels of circulating tumor markers may also help plan cancer treatment, make a likely prognosis, and find out how well treatment is working or if cancer has come back. Examples of circulating tumor markers include CA-125 (in ovarian cancer), calcitonin (in medullary thyroid cancer), EGFR mutations (in lung cancer), and beta-2-microglobulin (in multiple myeloma, chronic lymphocytic leukemia, and some lymphomas).
    More Information
    - Tumor Markers (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-fact-sheet)
  circulation: (ser-kyoo-LAY-shun)
    Pronunciation of dictionary term "circulation"
    In the body, the flow of blood through the heart and blood vessels, and the flow of lymph through the lymph vessels.
  circulatory system: (SER-kyoo-lah-tor-ee SIS-tem)
    Pronunciation of dictionary term "circulatory system"
    The system that contains the heart and the blood vessels and moves blood throughout the body. This system helps tissues get enough oxygen and nutrients, and it helps them get rid of waste products. The lymph system, which connects with the blood system, is often considered part of the circulatory system.
  circumcision: (SIR-kum-SIH-zhun)
    Pronunciation of dictionary term "circumcision"
    Surgery to remove part or all of the foreskin (loose skin that covers the head of the penis).
  cirrhosis: (seh-ROH-sis)
    Pronunciation of dictionary term "cirrhosis"
    A type of chronic, progressive liver disease in which healthy liver tissue is replaced by scar tissue. The scar tissue blocks the flow of blood through the liver and keeps it from working as it should. Symptoms of cirrhosis may not appear until the liver is badly damaged. Causes of cirrhosis include chronic alcohol use disorder, chronic hepatitis infections, and certain autoimmune conditions and genetic disorders. People with cirrhosis have a higher risk of developing liver cancer.
  CIS: The National Cancer Institute’s Cancer Information Service (CIS) provides cancer-related information to the public, free of charge. CIS staff provide personalized responses to questions in easy-to-understand language. Help with quitting smoking is also available. Contact CIS (https://www.cancer.gov/contact) by calling 1-800-4-CANCER (1-800-422-6237), or by using the LiveHelp instant-messaging service at https://livehelp.cancer.gov (https://livehelp.cancer.gov/app/chat/chat_launch). Also called Cancer Information Service.
    More Information
    - The Cancer Information Service (CIS) (https://www.cancer.gov/contact)
  CISNET: A group of researchers supported by the National Cancer Institute (NCI) who use statistical models to help understand how cancer prevention, screening, and treatment programs can affect the number of new cases of cancer diagnosed each year and the number of deaths from cancer each year. The CISNET is now studying breast, colorectal, esophageal, lung, and prostate cancers. The models they create help guide future cancer control strategies, research priorities, policies, and decision making. Also called Cancer Intervention and Surveillance Modeling Network.
  cisplatin: (sis-PLA-tin)
    Pronunciation of dictionary term "cisplatin"
    A drug used alone or with other drugs to treat certain types of bladder cancer, ovarian cancer, and testicular cancer. It is also being studied in the treatment of other types of cancer. Cisplatin damages the cell's DNA and may kill cancer cells. It is a type of platinum compound. The brand name Platinol has been taken off the market and is no longer available.
    More Information
    - Cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
  citalopram: (sy-TA-loh-pram)
    Pronunciation of dictionary term "citalopram"
    A drug used to treat depression. It belongs to the families of drugs called antidepressant agents and selective serotonin reuptake inhibitors (SSRIs). Also called Celexa.
  citric acid/potassium-sodium citrate: (SIH-trik A-sid/puh-TA-see-um-SOH-dee-um SIH-trayt)
    Pronunciation of dictionary term "citric acid/potassium-sodium citrate"
    A drug used in the treatment of metabolic acidosis (a disorder in which the blood is too acidic).
  citrovorum factor: (sih-troh-VOR-um FAK-ter)
    Pronunciation of dictionary term "citrovorum factor"
    A form of folic acid used alone or with other drugs to treat certain types of colorectal cancer and anemia and to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. Citrovorum factor is also being studied in the treatment of other conditions and types of cancer. It is a type of chemoprotective agent and a type of chemosensitizing agent. Also called folinic acid and leucovorin calcium.
    More Information
    - Leucovorin Calcium (https://www.cancer.gov/about-cancer/treatment/drugs/leucovorincalcium)
  cixutumumab: (SIK-syoo-TOO-myoo-mab)
    Pronunciation of dictionary term "cixutumumab"
    A substance being studied in the treatment of some types of cancer. It is a monoclonal antibody that is made in the laboratory and can bind to substances in the body. Cixutumumab blocks the action of a protein needed for cell growth and may kill cancer cells. It is a type of insulin-like growth factor-1 receptor (IGF-1R) inhibitor. Also called IMC-A12.
  CKD: A condition in which the kidneys become damaged slowly over time and are not able to remove waste products and extra water from the blood to make urine. This can cause an imbalance of important minerals and chemicals in the body. CKD usually gets worse over time and can lead to kidney failure and other health problems, such as heart disease, stroke, anemia, bone disease, and malnutrition. Most people with CKD do not have symptoms until the disease is very advanced. The two most common causes of CKD are diabetes and high blood pressure. Other risk factors include heart disease, obesity, smoking, older age, and having a family history of kidney disease or failure. There is no cure for CKD, but certain medicines, such as those that lower blood pressure or manage blood sugar levels, and healthy behaviors, such as eating a healthy diet, exercising regularly, losing extra weight, and quitting smoking, can help manage the disease. CKD is common among adults in the United States. Also called chronic kidney disease.
    More Information
    - Chronic kidney disease (MedlinePlus) (https://medlineplus.gov/ency/article/000471.htm)
    - Chronic Kidney Disease (CKD) (https://www.niddk.nih.gov/health-information/kidney-disease/chronic-kidney-disease-ckd)
  cladribine: (KLAD-rih-been)
    Pronunciation of dictionary term "cladribine"
    A drug used to treat hairy cell leukemia. It is also being studied in the treatment of other types of cancer. Cladribine damages the cell’s DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Cladribine (https://www.cancer.gov/about-cancer/treatment/drugs/cladribine)
  clarithromycin: (kluh-RITH-roh-MY-sin)
    Pronunciation of dictionary term "clarithromycin"
    An antibiotic drug used in the treatment of infections. It belongs to the family of drugs called macrolides.
  Clark level I skin cancer: (klark LEH-vul ... skin KAN-ser)
    Pronunciation of dictionary term "Clark level I skin cancer"
    Skin cancer that is found only in the epidermis (outer layer of skin).
    Clark levels of skin cancer. In Clark Level I, the cancer is in the epidermis only. In Clark Level II, the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In Clark Level III, the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In Clark Level IV, the cancer has spread into the reticular dermis. In Clark Level V, the cancer has spread into the subcutaneous tissue.
    Clark levels of skin cancer; drawing shows skin with five thin lesions of different depths. In the first lesion (Clark Level I), the cancer is in the epidermis only. In the second lesion (Clark Level II), the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In the third lesion (Clark Level III), the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In the fourth lesion (Clark Level IV), the cancer has spread into the reticular dermis. In the fifth lesion (Clark Level V), the cancer has spread into the subcutaneous tissue.
  Clark level II skin cancer: (klark LEH-vul … skin KAN-ser)
    Pronunciation of dictionary term "Clark level II skin cancer"
    Skin cancer that has spread from the epidermis (outer layer of skin) down into the papillary dermis (the thin top layer of the dermis).
    Clark levels of skin cancer. In Clark Level I, the cancer is in the epidermis only. In Clark Level II, the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In Clark Level III, the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In Clark Level IV, the cancer has spread into the reticular dermis. In Clark Level V, the cancer has spread into the subcutaneous tissue.
    Clark levels of skin cancer; drawing shows skin with five thin lesions of different depths. In the first lesion (Clark Level I), the cancer is in the epidermis only. In the second lesion (Clark Level II), the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In the third lesion (Clark Level III), the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In the fourth lesion (Clark Level IV), the cancer has spread into the reticular dermis. In the fifth lesion (Clark Level V), the cancer has spread into the subcutaneous tissue.
  Clark level III skin cancer: (klark LEH-vul … skin KAN-ser)
    Pronunciation of dictionary term "Clark level III skin cancer"
    Skin cancer that has spread down through the papillary dermis (the thin top layer of the dermis) but not into the reticular dermis (the thick bottom layer of the dermis).
    Clark levels of skin cancer. In Clark Level I, the cancer is in the epidermis only. In Clark Level II, the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In Clark Level III, the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In Clark Level IV, the cancer has spread into the reticular dermis. In Clark Level V, the cancer has spread into the subcutaneous tissue.
    Clark levels of skin cancer; drawing shows skin with five thin lesions of different depths. In the first lesion (Clark Level I), the cancer is in the epidermis only. In the second lesion (Clark Level II), the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In the third lesion (Clark Level III), the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In the fourth lesion (Clark Level IV), the cancer has spread into the reticular dermis. In the fifth lesion (Clark Level V), the cancer has spread into the subcutaneous tissue.
  Clark level IV skin cancer: (klark LEH-vul … skin KAN-ser)
    Pronunciation of dictionary term "Clark level IV skin cancer"
    Skin cancer that has spread down into the reticular dermis (the thick bottom layer of the dermis).
    Clark levels of skin cancer. In Clark Level I, the cancer is in the epidermis only. In Clark Level II, the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In Clark Level III, the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In Clark Level IV, the cancer has spread into the reticular dermis. In Clark Level V, the cancer has spread into the subcutaneous tissue.
    Clark levels of skin cancer; drawing shows skin with five thin lesions of different depths. In the first lesion (Clark Level I), the cancer is in the epidermis only. In the second lesion (Clark Level II), the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In the third lesion (Clark Level III), the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In the fourth lesion (Clark Level IV), the cancer has spread into the reticular dermis. In the fifth lesion (Clark Level V), the cancer has spread into the subcutaneous tissue.
  Clark level V skin cancer: (klark LEH-vul … skin KAN-ser)
    Pronunciation of dictionary term "Clark level V skin cancer"
    Skin cancer that has spread down into the subcutaneous tissue (tissue beneath the skin).
    Clark levels of skin cancer. In Clark Level I, the cancer is in the epidermis only. In Clark Level II, the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In Clark Level III, the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In Clark Level IV, the cancer has spread into the reticular dermis. In Clark Level V, the cancer has spread into the subcutaneous tissue.
    Clark levels of skin cancer; drawing shows skin with five thin lesions of different depths. In the first lesion (Clark Level I), the cancer is in the epidermis only. In the second lesion (Clark Level II), the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In the third lesion (Clark Level III), the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In the fourth lesion (Clark Level IV), the cancer has spread into the reticular dermis. In the fifth lesion (Clark Level V), the cancer has spread into the subcutaneous tissue.
  Clark levels: (klark LEH-vulz)
    Pronunciation of dictionary term "Clark levels"
    A system for describing how deep skin cancer has spread into the skin. Levels I-V describe the layers of skin involved.
    Clark levels of skin cancer. In Clark Level I, the cancer is in the epidermis only. In Clark Level II, the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In Clark Level III, the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In Clark Level IV, the cancer has spread into the reticular dermis. In Clark Level V, the cancer has spread into the subcutaneous tissue.
    Clark levels of skin cancer; drawing shows skin with five thin lesions of different depths. In the first lesion (Clark Level I), the cancer is in the epidermis only. In the second lesion (Clark Level II), the cancer has begun to spread into the papillary dermis (upper layer of the dermis). In the third lesion (Clark Level III), the cancer has spread through the papillary dermis into the papillary-reticular dermal interface but not into the reticular dermis (lower layer of the dermis). In the fourth lesion (Clark Level IV), the cancer has spread into the reticular dermis. In the fifth lesion (Clark Level V), the cancer has spread into the subcutaneous tissue.
  classic familial adenomatous polyposis: (KLA-sik fuh-MIH-lee-ul A-deh-NOH-muh-tus PAH-lee-POH-sis)
    Pronunciation of dictionary term "classic familial adenomatous polyposis"
    An inherited disorder in which many polyps (usually hundreds to thousands) form on the inner walls of the colon and rectum. Polyps are abnormal growths that may become cancer if they are not removed. People with classic familial adenomatous polyposis have a very high risk of developing colorectal cancer at an early age and are also at risk of developing cancers of the stomach, small intestine, pancreas, bile duct, liver, adrenal gland, thyroid, and brain. They may also have dental and eye problems and benign (not cancer) tumors in the stomach, small intestine, bone, soft tissue, skin, and adrenal glands. Classic familial adenomatous polyposis is caused by mutations (changes) in a gene called APC that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called classic familial polyposis, classic FAP, familial adenomatous polyposis, and FAP.
    More Information
    - Familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6408/familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  classic familial polyposis: (KLA-sik fuh-MIH-lee-ul PAH-lee-POH-sis)
    Pronunciation of dictionary term "classic familial polyposis"
    An inherited disorder in which many polyps (usually hundreds to thousands) form on the inner walls of the colon and rectum. Polyps are abnormal growths that may become cancer if they are not removed. People with classic familial polyposis have a very high risk of developing colorectal cancer at an early age and are also at risk of developing cancers of the stomach, small intestine, pancreas, bile duct, liver, adrenal gland, thyroid, and brain. They may also have dental and eye problems and benign (not cancer) tumors in the stomach, small intestine, bone, soft tissue, skin, and adrenal glands. Classic familial polyposis is caused by mutations (changes) in a gene called APC that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called classic familial adenomatous polyposis, classic FAP, familial adenomatous polyposis, and FAP.
    More Information
    - Familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6408/familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  classic FAP: (KLA-sik ...)
    Pronunciation of dictionary term "classic FAP"
    An inherited disorder in which many polyps (usually hundreds to thousands) form on the inner walls of the colon and rectum. Polyps are abnormal growths that may become cancer if they are not removed. People with classic FAP have a very high risk of developing colorectal cancer at an early age and are also at risk of developing cancers of the stomach, small intestine, pancreas, bile duct, liver, adrenal gland, thyroid, and brain. They may also have dental and eye problems and benign (not cancer) tumors in the stomach, small intestine, bone, soft tissue, skin, and adrenal glands. Classic FAP is caused by mutations (changes) in a gene called APC that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called classic familial adenomatous polyposis, classic familial polyposis, familial adenomatous polyposis, and FAP.
    More Information
    - Familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6408/familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  classic Hodgkin lymphoma: (KLA-sik HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "classic Hodgkin lymphoma"
    The most common type of Hodgkin lymphoma (a cancer of the immune system). Classic Hodgkin lymphoma is marked by the presence of a type of cell called the Reed-Sternberg cell.
    Reed-Sternberg cell. Reed-Sternberg cells are large, abnormal lymphocytes (a type of white blood cell) that may contain more than one nucleus. These cells are found in people with Hodgkin lymphoma. Reed-Sternberg cells are also called Hodgkin and Reed-Sternberg cells.
    Reed-Sternberg cell; photograph shows normal lymphocytes compared with a Reed-Sternberg cell.
  Claus model: (… MAH-dul)
    Pronunciation of dictionary term "Claus model"
    A computer program that uses statistics to predict a person’s risk for developing breast cancer based on family history.
  clavicle: (KLA-vih-kul)
    Pronunciation of dictionary term "clavicle"
    One of a pair of bones at the base of the front of the neck. The clavicles connect the breastbone to the shoulder blades. Also called collarbone.
  CLD: A type of disorder that affects the lungs and other parts of the respiratory system. It usually develops slowly and may get worse over time. CLD may be caused by smoking tobacco or by breathing in secondhand tobacco smoke, chemical fumes, dust, or other forms of air pollution. Types of CLD include asthma, chronic obstructive pulmonary disease (COPD), pulmonary fibrosis, asbestosis, pneumonitis, and other lung conditions. Also called chronic lung disease.
  clear cell: (kleer sel)
    Pronunciation of dictionary term "clear cell"
    A type of cell that looks clear inside when viewed under a microscope.
  clear cell adenocarcinoma: (kleer sel A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "clear cell adenocarcinoma"
    A rare type of cancer in which the cells look clear when viewed under a microscope. Clear cell adenocarcinoma occurs most often in the kidney and in the female reproductive organs. Also called clear cell carcinoma.
    More Information
    - Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet)
  clear cell carcinoma: (kleer sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "clear cell carcinoma"
    A rare type of cancer in which the cells look clear when viewed under a microscope. Clear cell carcinoma occurs most often in the kidney and in the female reproductive organs. Also called clear cell adenocarcinoma.
    More Information
    - Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet)
  clear cell renal cell cancer: (kleer sel REE-nul sel KAN-ser)
    Pronunciation of dictionary term "clear cell renal cell cancer"
    A type of kidney cancer in which the cells look clear or very pale when viewed under a microscope. Clear cell renal cell cancer begins in cells that line tiny tubes in the kidney. These tubes return filtered nutrients, fluids, and other substances that the body needs back to the blood. Clear cell renal cell cancer is the most common type of kidney cancer in adults. People with an inherited condition called von Hippel-Lindau syndrome are at an increased risk of developing clear cell renal cell cancer. Also called ccRCC, clear cell renal cell carcinoma, and conventional renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    - Clear Cell Renal Cell Carcinoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-kidney-tumors/clear-cell-renal-cell-carcinoma)
  clear cell renal cell carcinoma: (kleer sel REE-nul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "clear cell renal cell carcinoma"
    A type of kidney cancer in which the cells look clear or very pale when viewed under a microscope. Clear cell renal cell carcinoma begins in cells that line tiny tubes in the kidney. These tubes return filtered nutrients, fluids, and other substances that the body needs back to the blood. Clear cell renal cell carcinoma is the most common type of kidney cancer in adults. People with an inherited condition called von Hippel-Lindau syndrome are at an increased risk of developing clear cell renal cell carcinoma. Also called ccRCC, clear cell renal cell cancer, and conventional renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    - Clear Cell Renal Cell Carcinoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-kidney-tumors/clear-cell-renal-cell-carcinoma)
  clear cell sarcoma of soft tissue: (kleer sel sar-KOH-muh ... TIH-shoo)
    Pronunciation of dictionary term "clear cell sarcoma of soft tissue"
    A soft tissue tumor that begins in a tendon (tough, cord-like tissue that connects muscle to bone or to another part of the body). Under the microscope, clear cell sarcoma of soft tissue may look a lot like melanoma (a type of skin cancer). Clear cell sarcoma of soft tissue usually occurs in the leg or arm and it often spreads to nearby lymph nodes. It is most common in young adults.
  clear cell sarcoma of the kidney: (kleer sel sar-KOH-muh ...KID-nee)
    Pronunciation of dictionary term "clear cell sarcoma of the kidney"
    A rare type of kidney cancer, in which the inside of the cells look clear when viewed under a microscope. Clear cell sarcoma can spread from the kidney to other organs, most commonly the bone, but also including the lungs, brain, and soft tissues of the body.
  clear liquid diet: (kleer LIH-kwid DY-et)
    Pronunciation of dictionary term "clear liquid diet"
    A diet that is made up of only liquids and foods that are clear liquids at room temperature. Clear liquids are easy to digest and include water, broth, gelatin, plain tea and coffee, popsicles and juices without pulp, sodas, and sports drinks. Clear liquid diets may be used before certain tests or procedures, such as a colonoscopy, or before or after certain types of surgery. They may also be used to help treat gastrointestinal problems, such as nausea, vomiting, or diarrhea. Clear liquid diets are normally used for only a few days because they do not have enough of the calories and nutrients the body needs.
  cleaved: (kleevd)
    Pronunciation of dictionary term "cleaved"
    Having to do with the appearance of cells when viewed under a microscope. The nucleus of cleaved cells appears divided or segmented.
  clergy: (KLER-jee)
    Pronunciation of dictionary term "clergy"
    Ordained individuals who perform spiritual and/or religious functions.
  CLIA: (KLEE-uh)
    Pronunciation of dictionary term "CLIA"
    Changes to a 1988 U.S. law that sets the standards for all laboratory testing that is done on human tissue, blood, and other body fluid samples used to screen, diagnose, prevent, or treat a disease or condition. The CLIA program makes sure laboratories follow these standards and have quality control programs in place so that patient test results are accurate and reliable. The federal government agencies that manage the CLIA program are the Food and Drug Administration (FDA), the Centers for Medicare and Medicaid Services (CMS), and the Centers for Disease Control and Prevention (CDC). Certain types of laboratory testing, such as testing done in clinical trials, research studies, crime labs, and work-related drug testing, are not covered by the CLIA program. Also called Clinical Laboratory Improvement Amendments.
  clinical: (KLIH-nih-kul)
    Pronunciation of dictionary term "clinical"
    Having to do with the examination and treatment of patients.
  clinical breast exam: (KLIH-nih-kul brest eg-ZAM)
    Pronunciation of dictionary term "clinical breast exam"
    A physical exam of the breast performed by a health care provider to check for lumps or other changes. Also called CBE.
    More Information
    - Breast Cancer Screening
  clinical diagnosis: (KLIH-nih-kul DY-ug-NOH-sis)
    Pronunciation of dictionary term "clinical diagnosis"
    The process of identifying a disease, condition, or injury based on the signs and symptoms a patient is having and the patient’s health history and physical exam. Further testing, such as blood tests, imaging tests, and biopsies, may be done after a clinical diagnosis is made.
  Clinical Laboratory Improvement Amendments: (KLIH-nih-kul LA-bruh-tor-ee im-PROOV-ment uh-MEND-ments)
    Pronunciation of dictionary term "Clinical Laboratory Improvement Amendments"
    Changes to a 1988 U.S. law that sets the standards for all laboratory testing that is done on human tissue, blood, and other body fluid samples used to screen, diagnose, prevent, or treat a disease or condition. The Clinical Laboratory Improvement Amendments program makes sure laboratories follow these standards and have quality control programs in place so that patient test results are accurate and reliable. The federal government agencies that manage the Clinical Laboratory Improvement Amendments program are the Food and Drug Administration (FDA), the Centers for Medicare and Medicaid Services (CMS), and the Centers for Disease Control and Prevention (CDC). Certain types of laboratory testing, such as testing done in clinical trials, research studies, crime labs, and work-related drug testing, are not covered by the Clinical Laboratory Improvement Amendments program. Also called CLIA.
  clinical practice guidelines: (KLIH-nih-kul PRAK-tis GIDE-linez)
    Pronunciation of dictionary term "clinical practice guidelines"
    Guidelines developed to help health care professionals and patients make decisions about screening, prevention, or treatment of a specific health condition.
  clinical research: (KLIH-nih-kul REE-serch)
    Pronunciation of dictionary term "clinical research"
    Research in which people, or data or samples of tissue from people, are studied to understand health and disease. Clinical research helps find new and better ways to detect, diagnose, treat, and prevent disease. Types of clinical research include clinical trials, which test new treatments for a disease, and natural history studies, which collect health information to understand how a disease develops and progresses over time.
  clinical research costs: (KLIH-nih-kul REE-serch …)
    Pronunciation of dictionary term "clinical research costs"
    The costs related to taking part in a treatment clinical trial. These costs may include the drug or other intervention being studied as well as any special tests or procedures that are done only for the purposes of the clinical trial. They could also include data analysis and other costs associated with running the clinical trial. Clinical research costs are usually not covered by health insurance, but they may be covered by the clinical trial sponsor, such as a drug company.
  clinical researcher: (KLIH-nih-kul REE-ser-cher)
    Pronunciation of dictionary term "clinical researcher"
    A health professional who works directly with patients, or uses data from patients, to do research on health and disease and to develop new treatments. Clinical researchers may also do research on how health care practices affect health and disease.
  clinical resistance: (KLIH-nih-kul reh-ZIH-stunts)
    Pronunciation of dictionary term "clinical resistance"
    The failure of a cancer to shrink after treatment.
  clinical series: (KLIH-nih-kul SEER-eez)
    Pronunciation of dictionary term "clinical series"
    A case series in which the patients receive treatment in a clinic or other medical facility.
  clinical stage: (KLIH-nih-kul stayj)
    Pronunciation of dictionary term "clinical stage"
    The stage of cancer (amount or spread of cancer in the body) that is based on tests that are done before surgery. These include physical exams, imaging tests, laboratory tests (such as blood tests), and biopsies.
  clinical staging: (KLIH-nih-kul STAY-jing)
    Pronunciation of dictionary term "clinical staging"
    A method used to find out the stage of cancer (amount or spread of cancer in the body) using tests that are done before surgery. These include physical exams, imaging tests, laboratory tests (such as blood tests), and biopsies.
  clinical study: (KLIH-nih-kul STUH-dee)
    Pronunciation of dictionary term "clinical study"
    A type of research study that tests how well new medical approaches work in people. These studies test new methods of screening, prevention, diagnosis, or treatment of a disease. Also called clinical trial.
    More Information
    - Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials)
  clinical trial: (KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "clinical trial"
    A type of research study that tests how well new medical approaches work in people. These studies test new methods of screening, prevention, diagnosis, or treatment of a disease. Also called clinical study.
    More Information
    - Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials)
  clinical trial phase: (KLIH-nih-kul TRY-ul fayz)
    Pronunciation of dictionary term "clinical trial phase"
    A part of the clinical research process that answers specific questions about whether treatments or other interventions that are being studied work and are safe. Phase I trials test the best way to give a new treatment and the best dose. Phase II trials test whether a new treatment has an effect on the disease. Phase III trials compare the results of people taking a new treatment with the results of people taking the standard treatment. Phase IV trials are done using thousands of people after a treatment has been approved and marketed, to check for side effects that were not seen in the phase III trial.
  clinical trial sponsor: (KLIH-nih-kul TRY-ul SPON-ser)
    Pronunciation of dictionary term "clinical trial sponsor"
    A person, company, institution, group, or organization that oversees or pays for a clinical trial and collects and analyzes the data. Also called trial sponsor.
  clinician: (klih-NIH-shun)
    Pronunciation of dictionary term "clinician"
    A health professional who takes care of patients.
  clivus: (KLY-vus)
    Pronunciation of dictionary term "clivus"
    A bone at the base of the skull, near the spine. Tumors, such as chordomas and chondrosarcomas, may form on the clivus.
    Anatomy of the spine. The spine is made up of bones, muscles, tendons, nerves, and other tissues that reach from the base of the skull near the spinal cord (clivus) to the coccyx (tailbone). The vertebrae (back bones) of the spine include the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the tailbone. Each vertebra is separated by a disc. The vertebrae surround and protect the spinal cord. The spinal cord is divided into segments, each containing a pair of spinal nerves that send messages between the brain and the rest of the body. Many spinal nerves extend beyond the conus medullaris (the end of the spinal cord) to form a bundle of nerves called the cauda equina.
    Anatomy of the spine; drawing shows a side view of the spine, including the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the coccyx (tailbone). Also shown are the spinal cord, vertebra (back bone), conus medullaris (the end of the spinal cord), cauda equina (the bundle of spinal nerves that extend beyond the conus medullaris), and a lumbar disc. The clivus (a bone at the base of the skull near the spinal cord) is also shown.
  CLL: An indolent (slow-growing) cancer in which too many immature lymphocytes (white blood cells) are found mostly in the blood and bone marrow. Sometimes, in later stages of the disease, cancer cells are found in the lymph nodes and the disease is called small lymphocytic lymphoma. Also called chronic lymphocytic leukemia.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  CLL/SLL: An indolent (slow-growing) cancer in which immature lymphocytes (white blood cells) are found in the blood and bone marrow and/or in the lymph nodes. CLL (chronic lymphocytic leukemia) and SLL (small lymphocytic lymphoma) are the same disease, but in CLL cancer cells are found mostly in the blood and bone marrow. In SLL cancer cells are found mostly in the lymph nodes. CLL/SLL is a type of non-Hodgkin lymphoma. Also called chronic lymphocytic leukemia/small lymphocytic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  clodronate: (kloh-DROH-nayt)
    Pronunciation of dictionary term "clodronate"
    A drug used in the treatment of hypercalcemia (abnormally high levels of calcium in the blood) and cancer that has spread to the bone (bone metastases). It may decrease pain, the risk of fractures, and the development of new bone metastases.
  clofarabine: (kloh-FAYR-uh-been)
    Pronunciation of dictionary term "clofarabine"
    A drug used to treat children and young adults aged 1 to 21 years with acute lymphoblastic leukemia. It is used in patients whose cancer came back or did not get better after at least two other types of anticancer treatment. It is also being studied in the treatment of other types of cancer. Clofarabine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called Clolar.
    More Information
    - Clofarabine (https://www.cancer.gov/about-cancer/treatment/drugs/clofarabine)
  Clolar: (KLOH-lar)
    Pronunciation of dictionary term "Clolar"
    A drug used to treat children and young adults aged 1 to 21 years with acute lymphoblastic leukemia. It is used in patients whose cancer came back or did not get better after at least two other types of anticancer treatment. It is also being studied in the treatment of other types of cancer. Clolar stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called clofarabine.
    More Information
    - Clofarabine (https://www.cancer.gov/about-cancer/treatment/drugs/clofarabine)
  clonidine hydrochloride: (KLOH-nih-deen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "clonidine hydrochloride"
    A drug used to treat high blood pressure. It is also being studied in the treatment of certain types of cancer pain and as an aid to stop smoking. It blocks the release of chemicals from nerve endings that make blood vessels constrict (get narrower). Clonidine hydrochloride is a type of antihypertensive agent and a type of alpha-adrenergic agonist. Also called Catapres.
  Cloretazine: (klor-EH-tuh-zeen)
    Pronunciation of dictionary term "Cloretazine"
    A drug used to treat acute myelogenous leukemia (AML). It is also being studied in the treatment of several other types of cancer. It blocks cell growth by damaging the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called laromustine and Onrigin.
  Clostridium difficile: (klah-STRIH-dee-um dih-FIH-sih-lee)
    Pronunciation of dictionary term "Clostridium difficile"
    A type of bacterium found in human and animal waste. Clostridium difficile is a common cause of diarrhea that occurs in hospitals. It can also cause diarrhea or other intestinal disorders in patients treated with antibiotics.
  clove cigarette: (klove SIH-guh-ret)
    Pronunciation of dictionary term "clove cigarette"
    A type of cigarette that is made in Indonesia. It is made using a mixture of tobacco, cloves, and other ingredients. Clove cigarettes contain nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Smoking clove cigarettes can lead to nicotine addiction and can cause lung cancer and other lung conditions. Also called kretek.
    More Information
    - Harms of Cigarette Smoking and Health Benefits of Quitting (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/cessation-fact-sheet)
  CM-AVM syndrome: (… SIN-drome)
    Pronunciation of dictionary term "CM-AVM syndrome"
    A rare genetic condition that causes abnormalities of blood vessels, including swelling of the capillaries (small blood vessels) near the surface of the skin. The swollen capillaries usually appear as small, round, pink or red spots on the skin of the face, arms, and legs. They may appear at birth or develop during childhood. More serious blood vessel abnormalities that affect the skin, muscle, bone, spine, brain, and heart may also occur. These can lead to serious problems, including abnormal bleeding, migraines, seizures, and congestive heart failure. CM-AVM syndrome is a type of disease called a RASopathy that is caused by mutations (changes) in the RASA1 gene. This gene makes a protein involved in a cell signaling pathway that controls many important cell functions. Also called capillary malformation-arteriovenous malformation syndrome.
  CMF: An abbreviation for a chemotherapy combination used alone or with other therapies to treat breast cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs cyclophosphamide, methotrexate, and fluorouracil. Also called CMF regimen.
    More Information
    - CMF (https://www.cancer.gov/about-cancer/treatment/drugs/CMF)
  CMF regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CMF regimen"
    An abbreviation for a chemotherapy combination used alone or with other therapies to treat breast cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs cyclophosphamide, methotrexate, and fluorouracil. Also called CMF.
    More Information
    - CMF (https://www.cancer.gov/about-cancer/treatment/drugs/CMF)
  CML: An indolent (slow-growing) cancer in which too many myeloblasts are found in the blood and bone marrow. Myeloblasts are a type of immature blood cell that makes white blood cells called myeloid cells. CML may get worse over time as the number of myeloblasts increases in the blood and bone marrow. This may cause fever, fatigue, easy bleeding, anemia, infection, a swollen spleen, bone pain, or other signs and symptoms. CML is usually marked by a chromosome change called the Philadelphia chromosome, in which a piece of chromosome 9 and a piece of chromosome 22 break off and trade places with each other. It usually occurs in older adults and rarely occurs in children. Also called chronic granulocytic leukemia, chronic myelogenous leukemia, and chronic myeloid leukemia.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  CMML: A slowly progressing type of myelodysplastic/myeloproliferative disease in which too many myelomonocytes (a type of white blood cell) are in the bone marrow, crowding out other normal blood cells, such as other white blood cells, red blood cells, and platelets. Also called chronic myelomonocytic leukemia.
  CMS: A condition that may occur in patients who have had surgery to remove a tumor in certain parts of the brain, including the cerebellum. CMS usually appears 1 or 2 days after surgery. Symptoms include loss of speech, trouble swallowing and eating, loss of balance, trouble walking, loss of muscle tone, mood swings, and changes in personality. Many of these symptoms go away over time. Also called cerebellar mutism syndrome.
  CMV: A virus that may be carried in an inactive state for life by healthy individuals. It is a cause of severe pneumonia in people with a suppressed immune system, such as those undergoing bone marrow transplantation or those with leukemia or lymphoma. Also called cytomegalovirus.
  cnicin: (NIH-sin)
    Pronunciation of dictionary term "cnicin"
    A substance found in certain plants, including blessed thistle. It has been used in some cultures to treat certain medical problems. It may have anti-inflammatory and anticancer effects. Cnicin is a type of sesquiterpene lactone.
  CNS: The brain and spinal cord. Also called central nervous system.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
  CNS depressant: (… dee-PREH-sunt)
    Pronunciation of dictionary term "CNS depressant"
    A type of drug that slows down brain activity, which causes the muscles to relax and calms and soothes a person. CNS depressants are used to treat insomnia (trouble sleeping), anxiety, panic attacks, and seizures. They may also be used to relieve anxiety and tension before surgery. Examples of CNS depressants are benzodiazepines, barbiturates, and certain sleep medicines. CNS depressants are sometimes called sedatives or tranquilizers. Also called central nervous system depressant.
  CNS metastasis: (...meh-TAS-tuh-sis)
    Pronunciation of dictionary term "CNS metastasis"
    Cancer that has spread from the original (primary) tumor to the central nervous system (CNS). Also called central nervous system metastasis.
  CNS PNET: A type of cancer that arises from a particular type of cell within the brain or spinal cord. Also called central nervous system primitive neuroectodermal tumor.
  CNS prophylaxis: (... PROH-fih-LAK-sis)
    Pronunciation of dictionary term "CNS prophylaxis"
    A type of treatment that uses intrathecal chemotherapy (chemotherapy injected directly into the fluid-filled space between the thin layers of tissue that cover the brain and spinal cord) or high-dose chemotherapy injected into a vein to kill cancer cells in the central nervous system (CNS). Radiation therapy is also sometimes used. CNS prophylaxis is given when the cancer is diagnosed because standard chemotherapy cannot get into the CNS and kill cancer cells that may be hiding in there. It is used to lessen the chance cancer will come back in the CNS after the first treatment. CNS prophylaxis is used with other therapy to treat certain types of leukemia and lymphoma that may spread to the CNS. Also called central nervous system prophylaxis.
    Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.
    Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.
  CNS sanctuary therapy: (...SANK-choo-wayr-ee THAYR-uh-pee)
    Pronunciation of dictionary term "CNS sanctuary therapy"
    Chemotherapy or radiation therapy given to the central nervous system (CNS) as a preventive treatment. It kills cancer cells that may be in the brain and spinal cord, even though no cancer has been detected there. Also called central nervous system prophylaxis, central nervous system sanctuary therapy, and CNS prophylaxis.
  CNS stimulant: (... STIM-yoo-lunt)
    Pronunciation of dictionary term "CNS stimulant"
    A type of drug that increases the levels of certain chemicals in the brain and increases alertness, attention, energy, and physical activity. CNS stimulants also raise blood pressure and increase heart rate and breathing rate. They are used to treat depression, attention deficit hyperactivity disorder (a disorder in which a person has problems paying attention, controlling actions, and remaining still or quiet), and narcolepsy (a sleep disorder). Also called central nervous system stimulant.
  CNS tumor: (… TOO-mer)
    Pronunciation of dictionary term "CNS tumor"
    A tumor of the central nervous system (CNS), including brain stem glioma, craniopharyngioma, medulloblastoma, and meningioma. Also called central nervous system tumor.
  CNTO 328: A drug used to treat a rare condition called multicentric Castleman disease in patients who do not have HIV or human herpesvirus 8. It is also being studied in the treatment of some types of cancer and other conditions. CNTO 328 binds to a protein called interleukin-6 (IL-6), which is made by some white blood cells and other cells in the body. CNTO 328 may help reduce inflammation and stop the growth of cancer cells or abnormal blood cells. It is a type of monoclonal antibody. Also called anti-IL-6 chimeric monoclonal antibody, cCLB8, siltuximab, and Sylvant.
    More Information
    - Siltuximab (https://www.cancer.gov/about-cancer/treatment/drugs/siltuximab)
  co-culture: (koh-KUL-cher)
    Pronunciation of dictionary term "co-culture"
    A mixture of two or more different kinds of cells that are grown together.
  co-trimoxazole: (KOH-try-MOK-suh-zole)
    Pronunciation of dictionary term "co-trimoxazole"
    A drug used in the treatment of infections caused by bacteria and protozoa. It is a combination of two anti-infection drugs, sulfamethoxazole and trimethoprim.
  coactivated T cell: (koh-AK-tih-vay-ted … sel)
    Pronunciation of dictionary term "coactivated T cell"
    A T cell that has been coated with monoclonal antibodies to enhance its ability to kill tumor cells.
  cobalamin: (koh-BA-luh-min)
    Pronunciation of dictionary term "cobalamin"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Cobalamin helps make red blood cells, DNA, RNA, energy, and tissues, and keeps nerve cells healthy. It is found in liver, meat, eggs, poultry, shellfish, milk, and milk products. Cobalamin is water-soluble (can dissolve in water) and must be taken in every day. Not enough cobalamin can cause certain types of anemia (a condition in which the number of red blood cells is below normal) and neurologic disorders. It is being studied with folate in the prevention and treatment of some types of cancer. Also called cyanocobalamin and vitamin B12.
    More Information
    - Cancer Prevention Overview
  cobalt 60: (KOH-bawlt …)
    Pronunciation of dictionary term "cobalt 60"
    A radioactive form of the metal cobalt, which is used as a source of radiation to treat cancer.
  cobimetinib fumarate: (KOH-bih-MEH-tih-nib FYOO-muh-rayt)
    Pronunciation of dictionary term "cobimetinib fumarate"
    A drug used alone to treat adults with a group of blood disorders called histiocytic neoplasms and with vemurafenib to treat adults with melanoma that has spread or cannot be removed by surgery and has a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Cobimetinib fumarate blocks proteins called MEK1 and MEK2, which may help keep tumor cells from growing. It is a type of kinase inhibitor. Also called Cotellic.
    More Information
    - Cobimetinib Fumarate (https://www.cancer.gov/about-cancer/treatment/drugs/cobimetinib)
  coccyx: (KOK-six)
    Pronunciation of dictionary term "coccyx"
    The small bone at the bottom of the spine. It is made up of 3-5 fused bones. Also called tailbone.
  Cockayne syndrome: (KAH-kayn SIN-drome)
    Pronunciation of dictionary term "Cockayne syndrome"
    A rare genetic disorder that is caused by inheriting two mutations (changes) in the ERCC6 gene or in the ERCC8 gene. These genes make proteins involved in DNA repair. Cockayne syndrome is marked by shorter-than-average height, an abnormally small head, premature aging, sensitivity to light, and learning and developmental delays. Other signs and symptoms may include hearing loss, vision problems, tooth decay, bone abnormalities, and nervous system problems. The signs and symptoms usually appear during infancy and get worse over time. Cockayne syndrome is inherited in an autosomal recessive manner.
    More Information
    - Cockayne syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6122/cockayne-syndrome)
    - Cockayne syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/cockayne-syndrome/)
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  codeine phosphate: (KOH-deen FOS-fayt)
    Pronunciation of dictionary term "codeine phosphate"
    A drug used to treat mild to moderate pain, cough, and diarrhea. It is made from opium or morphine. Codeine phosphate works by binding to mu opioid receptors on cells in the central nervous system. This blocks pain signals and changes how the body responds to pain. It also helps decrease activity in the part of the brain that causes coughing. When used for diarrhea, it slows the movement of the muscles in the intestines, giving the body more time to absorb water and electrolytes from feces (waste matter). This results in firmer and less frequent bowel movements. Codeine phosphate is a type of opiate, a type of analgesic agent (pain reliever), a type of antitussive agent (cough suppressant), and a type of antidiarrheal agent.
    More Information
    - Cancer Pain
  codon: (KOH-don)
    Pronunciation of dictionary term "codon"
    A sequence of three nucleotides in a strand of DNA or RNA. Each codon corresponds to a specific amino acid (a building block of a protein). A protein is made from a long chain of amino acids. A codon can instruct the cell to start creating a protein chain, to add a specific amino acid to the growing protein chain, or to end the protein chain. The full set of codons is called the genetic code.
    More Information
    - Codon (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=36)
    Transcription and translation are processes a cell uses to make all proteins the body needs to function from information stored in the sequence of bases in DNA. The four bases (C, A, T/U, and G in the figure) are the building blocks of DNA and RNA. During transcription, a piece of DNA that codes for a specific gene is copied into messenger RNA (mRNA) in the nucleus of the cell. The mRNA then carries the genetic information from the DNA to the cytoplasm, where translation occurs. During translation, proteins are made using the information stored in the mRNA sequence. The mRNA attaches to a structure called a ribosome that can read the genetic information. As the mRNA passes through the ribosome, another type of RNA called transfer RNA (tRNA) carries a protein building block called an amino acid to the ribosome. The tRNA carrying the amino acid binds to a matching sequence in the mRNA. As each tRNA binds to the mRNA strand, the amino acid it carried joins with the other amino acids to form a chain of amino acids. Once all of the amino acids coded for in the piece of mRNA have been linked, the completed protein is released from the ribosome.
    Transcription and translation; the top part of the drawing shows transcription occurring in the nucleus of a cell: a piece of DNA that codes for a specific gene is copied into mRNA; bases in the copied DNA, adenine (A), cytosine (C), guanine (G), and thymine (T), form specific pairs with the bases in the mRNA, except adenine (A) in the DNA pairs with uracil (U) in the mRNA (also shown is a sequence of 3 bases called a codon in the mRNA); the mRNA then carries the genetic information from the DNA to the cytoplasm. The bottom part of the drawing shows translation occurring in the cytoplasm of a cell: the mRNA attaches to and passes through the ribosome; tRNA carries an amino acid to the ribosome, where it binds to a matching codon sequence in the mRNA; the amino acid joins with the other amino acids to form a growing protein chain; the completed protein is then released from the ribosome.
    Transcription and translation are processes a cell uses to make all proteins the body needs to function from information stored in the sequence of bases in DNA. The four bases (C, A, T/U, and G in the figure) are the building blocks of DNA and RNA. During transcription, a piece of DNA that codes for a specific gene is copied into messenger RNA (mRNA) in the nucleus of the cell. The mRNA then carries the genetic information from the DNA to the cytoplasm, where translation occurs. During translation, proteins are made using the information stored in the mRNA sequence. The mRNA attaches to a structure called a ribosome that can read the genetic information. As the mRNA passes through the ribosome, another type of RNA called transfer RNA (tRNA) carries a protein building block called an amino acid to the ribosome. The tRNA carrying the amino acid binds to a matching sequence in the mRNA. As each tRNA binds to the mRNA strand, the amino acid it carried joins with the other amino acids to form a chain of amino acids. Once all of the amino acids coded for in the piece of mRNA have been linked, the completed protein is released from the ribosome.
    Transcription and translation; the top part of the drawing shows transcription occurring in the nucleus of a cell: a piece of DNA that codes for a specific gene is copied into mRNA; bases in the copied DNA, adenine (A), cytosine (C), guanine (G), and thymine (T), form specific pairs with the bases in the mRNA, except adenine (A) in the DNA pairs with uracil (U) in the mRNA (also shown is a sequence of 3 bases called a codon in the mRNA); the mRNA then carries the genetic information from the DNA to the cytoplasm. The bottom part of the drawing shows translation occurring in the cytoplasm of a cell: the mRNA attaches to and passes through the ribosome; tRNA carries an amino acid to the ribosome, where it binds to a matching codon sequence in the mRNA; the amino acid joins with the other amino acids to form a growing protein chain; the completed protein is then released from the ribosome.
  coenzyme Q10: (koh-EN-zime ...)
    Pronunciation of dictionary term "coenzyme Q10"
    A nutrient that the body needs in small amounts to function and stay healthy. Coenzyme Q10 helps mitochondria (small structures in the cell) make energy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). Coenzyme Q10 is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, beef, soybeans, peanuts, and spinach. It is being studied in the prevention and treatment of some types of cancer and heart disease and in the relief of side effects caused by some cancer treatments. Also called CoQ10, Q10, ubiquinone, and vitamin Q10.
    More Information
    - Coenzyme Q10
  coffee enema: (KAW-fee EH-neh-muh)
    Pronunciation of dictionary term "coffee enema"
    The injection of coffee through the anus into the colon (large intestine). Coffee enemas are being tested in the treatment of pancreatic cancer.
  COG: A large group of researchers, hospitals, and cancer centers that get support from the National Cancer Institute (NCI) to study childhood cancers. The main goal of the COG is to conduct clinical trials that test new ways to prevent, diagnose, and treat cancer in children and adolescents. These clinical trials also include supportive care and childhood cancer survivorship studies. The COG has hospitals and cancer centers in the United States, Canada, Europe, Australia, and New Zealand. It is part of the National Clinical Trials Network (NCTN). Also called Children's Oncology Group.
  cognition: (kog-NIH-shun)
    Pronunciation of dictionary term "cognition"
    The mental process of thinking, learning, remembering, being aware of surroundings, and using judgment.
  cognitive behavior therapy: (KOG-nih-tiv beh-HAY-vyer THAYR-uh-pee)
    Pronunciation of dictionary term "cognitive behavior therapy"
    A type of psychotherapy that helps patients change their behavior by changing the way they think and feel about certain things. It is used to treat mental, emotional, personality, and behavioral disorders. Also called CBT and cognitive therapy.
  cognitive impairment: (KOG-nih-tiv im-PAYR-ment)
    Pronunciation of dictionary term "cognitive impairment"
    Problems with a person’s ability to think, learn, remember, use judgement, and make decisions. Signs of cognitive impairment include memory loss and trouble concentrating, completing tasks, understanding, remembering, following instructions, and solving problems. Other common signs may include changes in mood or behavior, loss of motivation, and being unaware of surroundings. Cognitive impairment may be mild or severe. There are many causes of cognitive impairment, including cancer and some cancer treatments.
    More Information
    - Cognitive Impairment in Adults with Cancer
  cognitive therapy: (KOG-nih-tiv THAYR-uh-pee)
    Pronunciation of dictionary term "cognitive therapy"
    A type of psychotherapy that helps patients change their behavior by changing the way they think and feel about certain things. It is used to treat mental, emotional, personality, and behavioral disorders. Also called CBT and cognitive behavior therapy.
  cohort: (KOH-hort)
    Pronunciation of dictionary term "cohort"
    A group of individuals who share a common trait, such as birth year. In medicine, a cohort is a group that is part of a clinical trial or study and is observed over a period of time.
  cohort study: (KOH-hort STUH-dee)
    Pronunciation of dictionary term "cohort study"
    A research study that compares a particular outcome (such as lung cancer) in groups of individuals who are alike in many ways but differ by a certain characteristic (for example, female nurses who smoke compared with those who do not smoke).
  coinsurance: (KOH-in-SHOOR-ents)
    Pronunciation of dictionary term "coinsurance"
    The amount of money not covered by a patient’s health insurance that the patient pays for each health care service. For example, if a plan covers 80% of the cost of a service, then the coinsurance that the patient pays will be the remaining 20% of the cost.
  COL-3: A substance being studied in the treatment of cancer. COL-3 may block the growth of new blood vessels that tumors need to grow. It is a type of matrix metalloproteinase inhibitor and a type of antiangiogenesis agent.
  COL17A1 gene: (… jeen)
    Pronunciation of dictionary term "COL17A1 gene"
    A gene that makes a type of collagen that plays an important role in strengthening and supporting the layers of the skin. Mutations (changes) in the COL17A1 gene may cause the skin to become easily damaged. COL17A1 gene mutations have been found in an inherited condition called junctional epidermolysis bullosa. People with this condition have fragile skin that blisters easily and may have an increased risk of developing squamous cell skin cancer.
    More Information
    - COL17A1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/col17a1/)
  COL18A1: A substance being studied in the treatment of cancer. COL18A1 is made from a type of collagen (a protein found in cartilage and other connective tissue). It may prevent the growth of new blood vessels that tumors need to grow. COL18A1 is a type of antiangiogenesis agent. Also called endostatin.
  COL7A1 gene: (… jeen)
    Pronunciation of dictionary term "COL7A1 gene"
    A gene that makes a type of collagen that plays an important role in strengthening and supporting the layers of the skin. Mutations (changes) in the COL7A1 gene may cause the skin to become easily damaged. COL7A1 gene mutations have been found in an inherited condition called dystrophic epidermolysis bullosa. People with this condition have an increased risk of developing squamous cell skin cancer.
    More Information
    - COL7A1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/col7a1/)
  colchicine: (KOL-chih-seen)
    Pronunciation of dictionary term "colchicine"
    A drug used to treat gout (inflamed joints caused by a buildup of uric acid). It comes from the crocus plant Colchicum autumnale. Colchicine blocks cell division and the movement of certain immune cells to areas that are inflamed. It is a type of alkaloid and a type of mitotic inhibitor.
  cold ischemia: (kold is-KEE-mee-uh)
    Pronunciation of dictionary term "cold ischemia"
    In surgery, the cooling of a tissue, organ, or body part after its blood supply has been reduced or cut off. This can occur while the organ is still in the body or after it is removed from the body if the organ is to be used for transplantation.
  cold ischemia time: (kold is-KEE-mee-uh …)
    Pronunciation of dictionary term "cold ischemia time"
    In surgery, the time between the chilling of a tissue, organ, or body part after its blood supply has been reduced or cut off and the time it is warmed by having its blood supply restored. This can occur while the organ is still in the body or after it is removed from the body if the organ is to be used for transplantation.
  cold knife cone biopsy: (kold nife kone BY-op-see)
    Pronunciation of dictionary term "cold knife cone biopsy"
    A procedure in which a cone-shaped piece of abnormal tissue is removed from the cervix using a scalpel or laser knife. Some of the tissue is then checked under a microscope for signs of disease, such as cervical cancer. Cold knife cone biopsy may also be used to treat certain cervical conditions. Also called cold knife conization.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cold knife conization: (kold nife koh-nih-ZAY-shun)
    Pronunciation of dictionary term "cold knife conization"
    A procedure in which a cone-shaped piece of abnormal tissue is removed from the cervix using a scalpel or laser knife. Some of the tissue is then checked under a microscope for signs of disease, such as cervical cancer. Cold knife conization may also be used to treat certain cervical conditions. Also called cold knife cone biopsy.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  cold nodule: (kold NAH-jool)
    Pronunciation of dictionary term "cold nodule"
    When radioactive material is used to examine the thyroid with a scanner, nodules that collect less radioactive material than the surrounding thyroid tissue are considered "cold." A nodule that is cold does not make thyroid hormone. Cold nodules may be benign (not cancer) or malignant (cancer). Cold nodules are sometimes called hypofunctioning nodules.
  cold tumor: (kold TOO-mer)
    Pronunciation of dictionary term "cold tumor"
    Describes a tumor that is not likely to trigger a strong immune response. Cold tumors tend to be surrounded by cells that are able to suppress the immune response and keep T cells (a type of immune cell) from attacking the tumor cells and killing them. Cold tumors usually do not respond to immunotherapy. Most cancers of the breast, ovary, prostate, pancreas, and brain (glioblastoma) are considered cold tumors.
  colectomy: (koh-LEK-toh-mee)
    Pronunciation of dictionary term "colectomy"
    An operation to remove all or part of the colon. When only part of the colon is removed, it is called a partial colectomy. In an open colectomy, one long incision is made in the wall of the abdomen and doctors can see the colon directly. In a laparoscopic-assisted colectomy, several small incisions are made and a thin, lighted tube attached to a video camera is inserted through one opening to guide the surgery. Surgical instruments are inserted through the other openings to perform the surgery.
  colitis: (koh-LY-tis)
    Pronunciation of dictionary term "colitis"
    Inflammation of the colon.
  collagen: (KAH-luh-jen)
    Pronunciation of dictionary term "collagen"
    A fibrous protein found in cartilage and other connective tissue.
  collagen disease: (KAH-luh-jen dih-ZEEZ)
    Pronunciation of dictionary term "collagen disease"
    A term previously used to describe chronic diseases of the connective tissue (e.g., rheumatoid arthritis, systemic lupus erythematosus, and systemic sclerosis), but now is thought to be more appropriate for diseases associated with defects in collagen, which is a component of the connective tissue.
  collagenase: (KAH-luh-jeh-nays)
    Pronunciation of dictionary term "collagenase"
    A type of enzyme that breaks down the protein collagen.
  collarbone: (KAH-ler-bone)
    Pronunciation of dictionary term "collarbone"
    One of a pair of bones at the base of the front of the neck. The collarbones connect the breastbone to the shoulder blades. Also called clavicle.
  collecting duct: (kuh-LEK-ting dukt)
    Pronunciation of dictionary term "collecting duct"
    The last part of a long, twisting tube that collects urine from the nephrons (cellular structures in the kidney that filter blood and form urine) and moves it into the renal pelvis and ureters. Also called renal collecting tubule.
  collective patient perspective: (kuh-LEK-tiv PAY-shunt per-SPEK-tiv)
    Pronunciation of dictionary term "collective patient perspective"
    An understanding of the disease experiences of many patients and the ability to describe this collective experience separately from a person’s own disease experience. In cancer research, a collective patient perspective may help scientific researchers develop clinical trials that help meet the needs of more patients.
  colloidal gold-bound tumor necrosis factor: (kuh-LOY-dul ... TOO-mer neh-KROH-sis FAK-ter)
    Pronunciation of dictionary term "colloidal gold-bound tumor necrosis factor"
    A substance being studied in the treatment of some types of cancer. Colloidal gold-bound tumor necrosis factor is made in the laboratory by binding a cancer-killing protein called tumor necrosis factor (TNF) to the surface of very tiny particles of gold. These TNF-gold particles may kill cancer cells without harming healthy tissue. Also called Aurimmune and TNF-bound colloidal gold.
  colloidal oatmeal: (kuh-LOY-dul … meel)
    Pronunciation of dictionary term "colloidal oatmeal"
    A special form of oatmeal that helps soothe, soften, and increase moisture in the skin. It may be used in a cream or lotion or as a powder that is added to a soaking bath to help treat rashes and burns, and dry, rough, scaly, or itchy skin. Colloidal oatmeal may also be used to help protect the skin against irritation or inflammation caused by certain skin conditions or skin damage.
  coloanal anastomosis: (KOH-loh-AY-nul uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "coloanal anastomosis"
    A surgical procedure in which the colon is attached to the anus after the rectum has been removed. Also called coloanal pull-through.
    Resection of the rectum with anastomosis. The rectum and part of the colon are removed, and then the colon and anus are joined.
    Three-panel drawing showing rectal cancer surgery with anastomosis; the first panel shows area of rectum with cancer, the middle panel shows cancer and nearby tissue removed, and the last panel shows the colon and anus joined.
  coloanal pull-through: (KOH-loh-AY-nul PUL-throo)
    Pronunciation of dictionary term "coloanal pull-through"
    A surgical procedure in which the colon is attached to the anus after the rectum has been removed. Also called coloanal anastomosis.
    Resection of the rectum with anastomosis. The rectum and part of the colon are removed, and then the colon and anus are joined.
    Three-panel drawing showing rectal cancer surgery with anastomosis; the first panel shows area of rectum with cancer, the middle panel shows cancer and nearby tissue removed, and the last panel shows the colon and anus joined.
  colon: (KOH-lun)
    Pronunciation of dictionary term "colon"
    The longest part of the large intestine (a tube-like organ connected to the small intestine at one end and the anus at the other). The colon removes water and some nutrients and electrolytes from partially digested food. The remaining material, solid waste called stool, moves through the colon, is stored in the rectum, and leaves the body through the anus. The colon is part of the digestive system.
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
    The colon includes the ascending colon, cecum, transverse colon, descending colon, sigmoid colon, and rectum.
    Parts of the colon; drawing shows the ascending colon, cecum, transverse colon, descending colon, sigmoid colon, and rectum.
  colon cancer: (KOH-lun KAN-ser)
    Pronunciation of dictionary term "colon cancer"
    Cancer that forms in the tissues of the colon (the longest part of the large intestine). Most colon cancers are adenocarcinomas (cancers that begin in cells that make and release mucus and other fluids).
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
  colon crypt: (KOH-lun kript)
    Pronunciation of dictionary term "colon crypt"
    Tube-like gland found in the lining of the colon and rectum. Colon crypt cells renew the lining of the intestine and make mucus. Also called gland of Lieberkuhn.
  colon polyp: (KOH-lun PAH-lip)
    Pronunciation of dictionary term "colon polyp"
    An abnormal growth of tissue in the lining of the bowel. Polyps are a risk factor for colon cancer.
    Polyps in the colon. Some polyps have a stalk and others do not. Inset shows a photo of a polyp with a stalk.
    Colon polyps; shows two polyps (one flat and one pedunculated) inside the colon. Inset shows photo of a pedunculated polyp.
  colonoscope: (koh-LAH-noh-SKOPE)
    Pronunciation of dictionary term "colonoscope"
    A thin, tube-like instrument used to examine the inside of the colon. A colonoscope has a light and a lens for viewing and may have a tool to remove tissue.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  colonoscopy: (KOH-luh-NOS-koh-pee)
    Pronunciation of dictionary term "colonoscopy"
    Examination of the inside of the colon using a colonoscope, inserted into the rectum. A colonoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    Colonoscopy. A thin, lighted tube is inserted through the anus and rectum and into the colon to look for abnormal areas.
    Colonoscopy; drawing shows a colonoscope inserted through the anus and rectum and into the colon. An inset shows a patient lying on a table having a colonoscopy.
  colony-stimulating factor: (KAH-luh-nee-STIM-yoo-LAY-ting FAK-ter)
    Pronunciation of dictionary term "colony-stimulating factor"
    A substance that stimulates the production of blood cells. Colony-stimulating factors include granulocyte colony-stimulating factor (G-CSF), granulocyte-macrophage colony-stimulating factor (GM-CSF), and promegapoietin.
  colorectal: (KOH-loh-REK-tul)
    Pronunciation of dictionary term "colorectal"
    Having to do with the colon or the rectum.
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
  colorectal adenoma: (KOH-loh-REK-tul A-deh-NOH-muh)
    Pronunciation of dictionary term "colorectal adenoma"
    A common type of polyp (abnormal growth) that forms on the inner lining of the colon or rectum. Colorectal adenomas are made up of gland-like tissue, vary in size and shape, and have different growth patterns. There are different types of colorectal adenomas, based on how they look under a microscope. These include tubular, villous, tubulovillous, and serrated adenomas. Colorectal adenomas are not cancer, but they are more likely to become cancer than other types of polyps if they are not removed.
  colorectal cancer: (KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "colorectal cancer"
    Cancer that develops in the colon (the longest part of the large intestine) and/or the rectum (the last several inches of the large intestine before the anus).
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
    The colon includes the ascending colon, cecum, transverse colon, descending colon, sigmoid colon, and rectum.
    Parts of the colon; drawing shows the ascending colon, cecum, transverse colon, descending colon, sigmoid colon, and rectum.
  colostomy: (koh-LOS-toh-mee)
    Pronunciation of dictionary term "colostomy"
    An opening into the colon from the outside of the body. A colostomy provides a new path for waste material to leave the body after part of the colon has been removed.
    Colon cancer surgery with colostomy. Part of the colon containing the cancer and nearby healthy tissue is removed, a stoma is created, and a colostomy bag is attached to the stoma.
    Three-panel drawing showing colon cancer surgery with colostomy; first panel shows the area of the colon with cancer, middle panel shows the cancer and nearby tissue removed and a stoma created, last panel shows a colostomy bag attached to the stoma.
  colostomy irrigation: (koh-LOS-toh-mee EER-ih-GAY-shun)
    Pronunciation of dictionary term "colostomy irrigation"
    A procedure in which a patient with a colostomy flushes the colon with water, using a tube that is inserted into the stoma (a surgically created opening in the body that connects an organ or area inside the body with the outside). This causes the colon to empty and pass stool through the stoma into a bag. The procedure should be done at the same time every day. It may allow colostomy patients to have better control over their bodies.
  colposcope: (KOL-poh-SKOPE)
    Pronunciation of dictionary term "colposcope"
    A lighted magnifying instrument used to check the cervix, vagina, and vulva for signs of disease.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  colposcopy: (kol-POS-koh-pee)
    Pronunciation of dictionary term "colposcopy"
    A procedure in which a lighted, magnifying instrument called a colposcope is used to examine the cervix, vagina, and vulva. During colposcopy, an instrument called a speculum is inserted into the vagina to widen it so that the cervix can be seen more easily. A vinegar solution may be used to make abnormal tissue easier to see with the colposcope. Tissue samples may be taken using a spoon-shaped instrument called a curette and checked under a microscope for signs of disease. Colposcopy may be used to check for cancers of the cervix, vagina, and vulva, and changes that may lead to cancer.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  Columvi: (koh-LOOM-vee)
    Pronunciation of dictionary term "Columvi"
    A drug used to treat adults with certain types of diffuse large B-cell lymphoma or large B-cell lymphoma that came back or did not get better after treatment with at least two other systemic therapies. It is also being studied in the treatment of other types of cancer. Columvi binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called CD20, which is found on B cells (another type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Columvi is a type of bispecific monoclonal antibody. Also called glofitamab.
    More Information
    - Glofitamab-gxbm (https://www.cancer.gov/about-cancer/treatment/drugs/glofitamab-gxbm)
  coma: (KOH-muh)
    Pronunciation of dictionary term "coma"
    A condition in which a patient is in a state of deep sleep and cannot be awakened. A coma may be caused by many things, including trauma, drugs, toxins, or certain diseases.
  combination antiretroviral therapy: (KOM-bih-NAY-shun AN-tee-REH-troh-VY-rul THAYR-uh-pee)
    Pronunciation of dictionary term "combination antiretroviral therapy"
    Treatment that uses a combination of three or more drugs to treat HIV infection. Combination antiretroviral therapy stops the virus from making copies of itself in the body. This may lessen the damage to the immune system caused by HIV and may slow down the development of AIDS. It may also help prevent transmission of HIV to others, including from mother to child during birth. Also called cART, HAART, and highly active antiretroviral therapy.
  combination chemotherapy: (KOM-bih-NAY-shun KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "combination chemotherapy"
    Treatment using more than one anticancer drug.
  combination therapy: (KOM-bih-NAY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "combination therapy"
    Therapy that combines more than one method of treatment. Also called multimodality therapy and multimodality treatment.
  combined androgen blockade: (kum-BINDE AN-droh-jen blah-KAYD)
    Pronunciation of dictionary term "combined androgen blockade"
    Treatment used to block androgen (male hormone) activity in the body. This may be done by giving an antiandrogen drug and removing the testicles (orchiectomy) or by giving an antiandrogen drug with a gonadotropin-releasing hormone (GnRH) agonist. Combined androgen blockade may stop the growth of cancer cells that need androgens to grow, and is used in the treatment of prostate cancer. Also called complete androgen blockade and total androgen blockade.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  combretastatin A4 phosphate: (kum-BREE-tuh-STA-tin … FOS-fayt)
    Pronunciation of dictionary term "combretastatin A4 phosphate"
    A substance being studied in the treatment of cancer. It decreases the flow of blood to tumors and may kill cancer cells. Combretastatin A4 phosphate comes from the African bush willow. It is a type of tubulin-binding agent and a type of vascular targeting agent.
  comedo carcinoma: (KAH-meh-doh KAR-sih-NOH-muh)
    Pronunciation of dictionary term "comedo carcinoma"
    A type of ductal carcinoma in situ (very early-stage breast cancer).
  Cometriq: (koh-MEH-trik)
    Pronunciation of dictionary term "Cometriq"
    A drug that contains the active ingredient cabozantinib-s-malate and is used to treat progressive medullary thyroid cancer that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Cometriq blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Cometriq is a type of tyrosine kinase inhibitor and a type of angiogenesis inhibitor.
    More Information
    - Cabozantinib-S-Malate (https://www.cancer.gov/about-cancer/treatment/drugs/cabozantinib-s-malate)
  comfort care: (KUM-furt kayr)
    Pronunciation of dictionary term "comfort care"
    Care given to people who are near the end of life and have stopped treatment to cure or control their disease. Comfort care includes physical, emotional, social, and spiritual support for patients and their families. The goal of comfort care is to control pain and other symptoms so the patient can be as comfortable as possible. Comfort care may include palliative care, supportive care, and hospice care. Also called end-of-life care.
    More Information
    - Last Days of Life
    - End-of-Life Care for People Who Have Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/care-fact-sheet)
    - Coping with Advanced Cancer: Choices for Care Near the End of Life (https://www.cancer.gov/publications/patient-education/advanced-cancer)
    - Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices)
  common bile duct: (KAH-mun bile dukt)
    Pronunciation of dictionary term "common bile duct"
    A tube that carries bile from the liver and gallbladder, through the pancreas, and into the small intestine. The common bile duct starts where the ducts from the liver and gallbladder join and ends at the small intestine. It is part of the biliary system.
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  common hepatic duct: (KAH-mun heh-PA-tik dukt)
    Pronunciation of dictionary term "common hepatic duct"
    A tube that carries bile from the liver. The common hepatic duct starts where the right and left hepatic ducts join outside the liver and ends where a duct from the gallbladder joins it to form the common bile duct. It is part of the biliary system.
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  common iliac artery: (KAH-mun ILL-ee-ak AR-tuh-ree)
    Pronunciation of dictionary term "common iliac artery"
    A set of two major blood vessels that carry blood to the lower part of the body, including the pelvis, reproductive organs, and legs. The common iliac artery branches off from the bottom part of the abdominal aorta (the largest blood vessel in the abdomen) into the right common iliac artery and left common iliac artery. Each common iliac artery further branches into an external iliac artery and an internal iliac artery, one on each side of the body. The external iliac arteries supply blood to the legs and feet. The internal iliac arteries supply blood to the tissues and organs in and around the pelvis, including the bladder, rectum, reproductive organs, groin, hips, and buttocks.
  Community Advisory Board: (kuh-MYOO-nih-tee ad-VIZE-ree bord)
    Pronunciation of dictionary term "Community Advisory Board"
    In medicine, a group of non-scientist volunteers that serves as a link between a community and clinical trial researchers. A Community Advisory Board may review and monitor clinical trials and help teach the community about the trials. Also called CAB.
  community immunity: (kuh-MYOO-nih-tee ih-MYOO-nih-tee)
    Pronunciation of dictionary term "community immunity"
    Protection from an infectious disease as a result of living in a community where a large number of people are vaccinated against that disease. When enough people are vaccinated against a disease, it is harder for the disease to spread. Community immunity helps protect those who have not been vaccinated, including newborns, pregnant women, and people with certain illnesses who cannot receive vaccines. Also called herd immunity.
  comorbidity: (koh-mor-BIH-dih-tee)
    Pronunciation of dictionary term "comorbidity"
    The condition of having two or more diseases at the same time.
  companion diagnostic test: (kum-PAN-yun DY-ug-NAH-stik …)
    Pronunciation of dictionary term "companion diagnostic test"
    A test used to help match a patient to a specific drug or therapy. For example, a companion diagnostic test may identify whether a patient’s tumor has a specific gene change or biomarker that is targeted by the drug. This helps determine if the patient should receive the drug or not. Companion diagnostic tests can also be used to find out whether serious side effects may occur from treatment or how well treatment is working. Most drugs with a companion diagnostic test are cancer drugs that target specific tumor mutations.
  comparative anatomy: (kum-PAYR-uh-tiv uh-NA-toh-mee)
    Pronunciation of dictionary term "comparative anatomy"
    The comparison of the structure (anatomy) of one animal or plant with the structure of a different animal or plant.
  compassionate use: (kum-PA-shuh-nut yoos)
    Pronunciation of dictionary term "compassionate use"
    A way to provide an investigational therapy to a patient who is not eligible to receive that therapy in a clinical trial, but who has a serious or life-threatening illness for which other treatments are not available. Compassionate use allows patients to receive promising but not yet fully studied or approved cancer therapies when no other treatment option exists. Also called expanded access.
  complement protein: (KOM-pleh-ment PROH-teen)
    Pronunciation of dictionary term "complement protein"
    One of a group of about 20 proteins that is found in the blood and is important in fighting infections and other diseases.
  complementary and alternative medicine: (KOM-pleh-MEN-tuh-ree... all-TER-nuh-tiv MEH-dih-sin)
    Pronunciation of dictionary term "complementary and alternative medicine"
    A term used to describe a medical product or practice that is used together with (complementary) or instead of (alternative) standard medical care. Usually, less is known about most types of complementary and alternative medicine than about standard treatments, which go through a long and careful research process to prove they are safe and effective. Complementary and alternative medicine may include dietary supplements, megadose vitamins, herbal preparations, special teas, acupuncture, massage therapy, magnet therapy, spiritual healing, and meditation. Also called CAM.
    More Information
    - Complementary and Alternative Medicine (https://www.cancer.gov/about-cancer/treatment/cam)
  complementary medicine: (KOM-pleh-MEN-tuh-ree MEH-dih-sin)
    Pronunciation of dictionary term "complementary medicine"
    Treatments that are used along with standard treatments, but are not considered standard. Standard treatments are based on the results of scientific research and are currently accepted and widely used. Less research has been done for most types of complementary medicine. Complementary medicine includes acupuncture, dietary supplements, massage therapy, hypnosis, and meditation. For example, acupuncture may be used with certain drugs to help lessen cancer pain or nausea and vomiting. Also called complementary therapy.
    More Information
    - Complementary and Alternative Medicine (https://www.cancer.gov/about-cancer/treatment/cam)
  complementary therapy: (KOM-pleh-MEN-tuh-ree THAYR-uh-pee)
    Pronunciation of dictionary term "complementary therapy"
    Treatment that is used along with standard treatment, but is not considered standard. Standard treatments are based on the results of scientific research and are currently accepted and widely used. Less research has been done for most types of complementary therapy. Complementary therapy includes acupuncture, dietary supplements, massage therapy, hypnosis, and meditation. For example, acupuncture may be used with certain drugs to help lessen cancer pain or nausea and vomiting. Also called complementary medicine.
    More Information
    - Complementary and Alternative Medicine (https://www.cancer.gov/about-cancer/treatment/cam)
  complete androgen blockade: (kum-PLEET AN-droh-jen blah-KAYD)
    Pronunciation of dictionary term "complete androgen blockade"
    Treatment used to block androgen (male hormone) activity in the body. This may be done by giving an antiandrogen drug and removing the testicles (orchiectomy) or by giving an antiandrogen drug with a gonadotropin-releasing hormone (GnRH) agonist. Complete androgen blockade may stop the growth of cancer cells that need androgens to grow, and is used in the treatment of prostate cancer. Also called combined androgen blockade and total androgen blockade.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  complete blood count: (kum-PLEET blud kownt)
    Pronunciation of dictionary term "complete blood count"
    A measure of the number of red blood cells, white blood cells, and platelets in the blood. The amount of hemoglobin (substance in the blood that carries oxygen) and the hematocrit (the amount of whole blood that is made up of red blood cells) are also measured. A complete blood count is used to help diagnose and monitor many conditions. Also called blood cell count, CBC, and full blood count.
    Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
    Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
  complete decongestive therapy: (kum-PLEET DEE-kun-JEH-stiv THAYR-uh-pee)
    Pronunciation of dictionary term "complete decongestive therapy"
    A treatment program used to help manage the symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Complete decongestive therapy includes gentle massage and special compression bandaging to help move lymph through the body. It also includes exercises to help control swelling and improve mobility in the affected arm or leg and skin and nail care to prevent infection.
  complete hysterectomy: (kum-PLEET HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "complete hysterectomy"
    Surgery to remove the uterus and the cervix. The ovaries and fallopian tubes may also be removed. A complete hysterectomy may be done through the vagina (with no incisions in the abdomen) or through an incision (cut) in the abdomen. Also called simple hysterectomy and total hysterectomy.
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  complete metastasectomy: (kum-PLEET meh-TAS-tuh-SEK-toh-mee)
    Pronunciation of dictionary term "complete metastasectomy"
    Surgery to remove all metastases (tumors formed from cells that have spread from the primary tumor).
  complete remission: (kum-PLEET reh-MIH-shun)
    Pronunciation of dictionary term "complete remission"
    The disappearance of all signs of cancer in response to treatment. This does not always mean the cancer has been cured. Also called complete response.
  complete response: (kum-PLEET reh-SPONTS)
    Pronunciation of dictionary term "complete response"
    The disappearance of all signs of cancer in response to treatment. This does not always mean the cancer has been cured. Also called complete remission.
  complex fibroadenoma: (KOM-plex FY-broh-a-deh-NOH-muh)
    Pronunciation of dictionary term "complex fibroadenoma"
    A type of benign (not cancer) tumor that usually forms in the breast and is made up of fibrous (connective) and glandular tissue. In complex fibroadenomas, other abnormal tissue changes are also present. These changes may include cysts, calcifications, scar-like tissue, and hyperplasia (an increase in the number of cells in the breast ducts or lobes). Complex fibroadenomas are more common in older women and may slightly increase the risk of breast cancer.
  complex sclerosing lesion: (KOM-plex skleh-ROH-sing LEE-shun)
    Pronunciation of dictionary term "complex sclerosing lesion"
    A benign (not cancer) area of hardened tissue in the breast that looks like a scar when viewed under a microscope. Complex sclerosing lesions often occur in both breasts, and more than one lesion is usually present in each breast. They usually cannot be felt and do not cause symptoms but may look like breast cancer on a mammogram, especially if the lesions are large. A biopsy is usually needed to tell the difference between these lesions and breast cancer. Complex sclerosing lesions may slightly increase the risk of breast cancer. Also called radial scar.
  compliance: (kum-PLY-unts)
    Pronunciation of dictionary term "compliance"
    The act of following a medical regimen or schedule correctly and consistently, including taking medicines or following a diet.
  complication: (kom-plih-KAY-shun)
    Pronunciation of dictionary term "complication"
    In medicine, a medical problem that occurs during a disease, or after a procedure or treatment. The complication may be caused by the disease, procedure, or treatment or may be unrelated to them.
  composite hemangioendothelioma: (kum-PAH-zit hee-MAN-jee-oh-EN-doh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "composite hemangioendothelioma"
    A blood vessel tumor that is made up of different types of cells and has features that are both benign (not cancer) and malignant (cancer). Composite hemangioendotheliomas usually form on or under the skin on the arms or legs. They may also form on the head, neck, or chest. Composite hemangioendotheliomas may spread to nearby lymph nodes, but usually do not spread to other parts of the body. They may come back in the same place after treatment. They are most common in adults. Composite hemangioendotheliomas are a type of vascular tumor.
  composite lymphoma: (kum-PAH-zit lim-FOH-muh)
    Pronunciation of dictionary term "composite lymphoma"
    A rare form of lymphoma (cancer that begins in cells of the immune system) in which different types of lymphoma cells occur at the same time. The different lymphoma cells may form in the same tissue or organ or in many different tissues or organs. The composite lymphoma may contain different types of non-Hodgkin lymphoma cells or both Hodgkin and non-Hodgkin lymphoma cells.
  compound: (KOM-pownd)
    Pronunciation of dictionary term "compound"
    In science, a substance made from two or more different elements that have been chemically joined. Examples of compounds include water (H2O), which is made from the elements hydrogen and oxygen, and table salt (NaCl), which is made from the elements sodium and chloride.
  compound nevus: (KOM-pownd NEE-vus)
    Pronunciation of dictionary term "compound nevus"
    A type of mole formed by groups of nevus cells found in the epidermis and dermis (the two main layers of tissue that make up the skin).
  comprehensive cancer center: (KOM-pree-HEN-siv KAN-ser ...)
    Pronunciation of dictionary term "comprehensive cancer center"
    A cancer research center that gets support from the National Cancer Institute (NCI) to do cancer research and provide services directly to cancer patients. Scientists and doctors at these centers do basic laboratory research and clinical trials, and they study the patterns, causes, and control of cancer in groups of people. Also, they take part in multicenter clinical trials, which enroll patients from many parts of the country. Comprehensive Cancer Centers also give cancer information to health care professionals and the public. More information about the NCI Cancer Centers Program can be found on the NCI's Web site at http://cancercenters.cancer.gov/.
  comprehensive pediatric cancer center: (KOM-pree-HEN-siv pee-dee-A-trik ...)
    Pronunciation of dictionary term "comprehensive pediatric cancer center"
    A cancer research center that gets support from the National Cancer Institute (NCI). Scientists and doctors at these centers do basic laboratory research and clinical trials on childhood cancers, and they study the patterns, causes, and control of cancer in groups of children. Also, they treat patients from many parts of the country and give cancer information to health care professionals and the public. More information about the NCI Cancer Centers Program can be found on the NCI's Web site at https://cancercenters.cancer.gov/.
  compression: (kum-PREH-shun)
    Pronunciation of dictionary term "compression"
    A pressing or squeezing together. In medicine, it can describe a structure, such as a tumor, that presses on another part of the body, such as a nerve. It can also describe the flattening of soft tissue, such as the breast, that occurs during a mammogram (x-ray of the breast).
  compression bandage: (kum-PREH-shun BAN-dij)
    Pronunciation of dictionary term "compression bandage"
    A bandage designed to provide pressure to a particular area.
  compression fracture: (kum-PREH-shun FRAK-sher)
    Pronunciation of dictionary term "compression fracture"
    A type of break in a bone caused by pressure and in which the bone collapses. Compression fractures usually occur in the spine (backbone) and in bones made weak by cancer or by osteoporosis (a decrease in bone mass and density).
  compression garment: (kum-PREH-shun GAR-ment)
    Pronunciation of dictionary term "compression garment"
    A tight-fitting, elastic garment, such as a sleeve or stocking. Compression garments are used in the treatment of lymphedema (swelling caused by a buildup of lymph fluid in tissue). They are also used to improve blood flow.
  compression pump: (kum-PREH-shun …)
    Pronunciation of dictionary term "compression pump"
    A machine used to keep blood and lymph flowing by pushing air through bands or sleeves that are placed on the arms or legs.
  compulsion: (kum-PUL-zhun)
    Pronunciation of dictionary term "compulsion"
    An uncontrollable urge to say or do something without an obvious reason. A person may repeat a behavior, such as hand-washing, over and over.
  computational biology: (kom-pyoo-TAY-shuh-nul by-AH-loh-jee)
    Pronunciation of dictionary term "computational biology"
    A field of science that uses computers, databases, math, and statistics to collect, store, organize, and analyze large amounts of biological, medical, and health information. Information may come from many sources, including genetic and molecular research studies, patient statistics, tissue specimens, clinical trials, and scientific journals. Also called bioinformatics.
  computed tomographic colonography: (kum-PYOO-ted toh-muh-GRA-fik KOH-lun-AH-gruh-fee)
    Pronunciation of dictionary term "computed tomographic colonography"
    A method to examine the inside of the colon by taking a series of x-rays. A computer is used to make 2-dimensional (2-D) and 3-D pictures of the colon from these x-rays. The pictures can be saved, changed to give better viewing angles, and reviewed after the procedure, even years later. Also called computed tomography colonography, CT colonography, and virtual colonoscopy.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  computed tomography angiography: (kum-PYOO-ted toh-MAH-gruh-fee an-jee-AH-gruh-fee)
    Pronunciation of dictionary term "computed tomography angiography"
    A procedure that uses x-rays to create a series of detailed pictures of the blood vessels and blood flow inside the body. The pictures are taken from different angles and are created by a computer linked to an x-ray machine. A dye is injected into a vein to make the blood vessels and blood flow easier to see on the x-ray. Computed tomography angiography may be used to check for aneurysms (a bulge in the blood vessel wall), blockages in the arteries, blood clots, and other blood vessel problems. Also called CT angiography and CTA.
  computed tomography colonography: (kum-PYOO-ted toh-MAH-gruh-fee KOH-luh-NAH-gruh-fee)
    Pronunciation of dictionary term "computed tomography colonography"
    A method to examine the inside of the colon by taking a series of x-rays. A computer is used to make 2-dimensional (2-D) and 3-D pictures of the colon from these x-rays. The pictures can be saved, changed to give better viewing angles, and reviewed after the procedure, even years later. Also called computed tomographic colonography, CT colonography, and virtual colonoscopy.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  computed tomography scan: (kum-PYOO-ted toh-MAH-gruh-fee skan)
    Pronunciation of dictionary term "computed tomography scan"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-dimensional (3-D) views of tissues and organs. A dye may be injected into a vein or swallowed to help the tissues and organs show up more clearly. A computed tomography scan may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called CAT scan, computerized axial tomography scan, computerized tomography, and CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
    Computed tomography (CT) scan of the abdomen. The patient lies on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
    Computed tomography (CT) scan of the abdomen; drawing shows the patient on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
  computer-aided detection system: (kum-PYOO-ter-AY-ded deh-TEK-shun SIS-tem)
    Pronunciation of dictionary term "computer-aided detection system"
    A computer-based system that uses special software to help look for suspicious areas of tissue on an x-ray image. A computer-aided detection system highlights these areas on the image so they can be looked at more closely. A computer-aided detection system is used with certain types of imaging, such as mammography or chest x-ray, to help diagnose a disease, such as cancer. Also called CAD system.
  computerized axial tomography scan: (kum-PYOO-teh-RIZED AK-see-ul toh-MAH-gruh-fee skan)
    Pronunciation of dictionary term "computerized axial tomography scan"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-dimensional (3-D) views of tissues and organs. A dye may be injected into a vein or swallowed to help the tissues and organs show up more clearly. A computerized axial tomography scan may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called CAT scan, computed tomography scan, computerized tomography, and CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
    Computed tomography (CT) scan of the abdomen. The patient lies on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
    Computed tomography (CT) scan of the abdomen; drawing shows the patient on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
  computerized tomography: (kum-PYOO-teh-RIZED toh-MAH-gruh-fee)
    Pronunciation of dictionary term "computerized tomography"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-dimensional (3-D) views of tissues and organs. A dye may be injected into a vein or swallowed to help the tissues and organs show up more clearly. A computerized tomography may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called CAT scan, computed tomography scan, computerized axial tomography scan, and CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
    Computed tomography (CT) scan of the abdomen. The patient lies on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
    Computed tomography (CT) scan of the abdomen; drawing shows the patient on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
  concentration: (KON-sen-TRAY-shun)
    Pronunciation of dictionary term "concentration"
    In science, the amount of a substance, such as a salt, that is in a certain amount of tissue or liquid, such as blood. A substance becomes more concentrated when less water is present. For example, the salt in urine may become more concentrated when a person doesn’t drink enough water.
  conception: (kun-SEP-shun)
    Pronunciation of dictionary term "conception"
    In biology, the beginning of pregnancy, marked by fertilization of an egg by a sperm.
  Concerta: (kon-SER-tuh)
    Pronunciation of dictionary term "Concerta"
    A drug used to treat certain behavior disorders, such as attention deficit hyperactivity disorder (ADHD). It is also being studied as a way to improve brain function in patients treated with anticancer drugs. Concerta acts on certain parts of the brain. It is a type of central nervous system stimulant. Also called methylphenidate hydrochloride and Ritalin.
  concomitant: (kon-KAH-mih-tunt)
    Pronunciation of dictionary term "concomitant"
    Occurring or existing at the same time as something else. In medicine, it may refer to a condition a person has or a medication a person is taking that is not being studied in the clinical trial he or she is taking part in.
  concordant finding: (kun-KOR-dent FINE-ding)
    Pronunciation of dictionary term "concordant finding"
    In medicine, a term that describes two or more findings that agree with one another when doing a physical exam, imaging or lab test, or a biopsy. For example, feeling a suspicious breast lump on a physical exam, having an abnormal mammogram, and finding breast cancer on a tissue biopsy are considered concordant findings. Concordant findings help confirm a diagnosis.
  concurrent therapy: (kun-KER-ent THAYR-uh-pee)
    Pronunciation of dictionary term "concurrent therapy"
    A treatment that is given at the same time as another.
  condition: (kun-DIH-shun)
    Pronunciation of dictionary term "condition"
    In medicine, a term that refers to a person's state of health. For example, a patient's condition in the hospital may be described as good, stable, or serious. Condition may also refer to a normal state with regard to one's health, such as pregnancy, or to a disease, disorder, illness, or injury.
  conditionally reprogrammed cell: (kun-DIH-shuh-nuh-lee ree-PROH-gramd sel)
    Pronunciation of dictionary term "conditionally reprogrammed cell"
    A type of cell grown in the laboratory from samples of normal cells or cancer cells from patient tissue. These cells can be kept alive for as long as needed and grown to large numbers. The cells are treated with substances that cause them to resemble stem cells (cells from which other types of cells develop) and grow rapidly. Under certain conditions, conditionally reprogrammed cells can be made to look and act like the original tissue or specific type of tumor from which they came. They are used to study how cancers and other diseases form, and to test new drugs and other types of treatment before they are given to people. Also called CRC.
  conditioned response: (kun-DIH-shund reh-SPONTS)
    Pronunciation of dictionary term "conditioned response"
    A type of learning in which repeated exposure to something may affect a person’s behavior when they encounter an unrelated object, sound, or smell that occurred at the same time as the initial exposure. For example, a patient who always feels sick after receiving chemotherapy in a clinic that smells a certain way may be conditioned to feel sick when smelling the same odor in a different place.
  conditioned stimulus: (kun-DIH-shund STIM-yoo-lus)
    Pronunciation of dictionary term "conditioned stimulus"
    A situation in which one signal, or stimulus, is given just before another signal. After this happens several times, the first signal alone can cause the response that would usually need the second signal.
  conditioning regimen: (kun-DIH-shuh-ning REH-jih-men)
    Pronunciation of dictionary term "conditioning regimen"
    The treatments used to prepare a patient for stem cell transplantation (a procedure in which a person receives blood stem cells, which make any type of blood cell). A conditioning regimen may include chemotherapy, monoclonal antibody therapy, and radiation to the entire body. It helps make room in the patient’s bone marrow for new blood stem cells to grow, helps prevent the patient's body from rejecting the transplanted cells, and helps kill any cancer cells that are in the body.
  condyloma: (KON-dih-LOH-muh)
    Pronunciation of dictionary term "condyloma"
    A raised growth on the surface of the genitals caused by human papillomavirus (HPV) infection. The HPV in condyloma is very contagious and can be spread by skin-to-skin contact, usually during oral, anal, or genital sex with an infected partner. Also called genital wart.
  condyloma acuminatum: (KON-dih-LOH-muh uh-KYOO-mih-NAY-tum)
    Pronunciation of dictionary term "condyloma acuminatum"
    A raised growth on the surface of the genitals or in or around the anus caused by infection with certain types of human papillomavirus (HPV). HPV can spread by skin-to-skin contact, usually during oral, anal, or genital sex with an infected partner. These warts can also occur on the lips and tongue and in the mouth and throat. Condyloma acuminata often appear as small, skin-colored bumps that may be clumped together. They are usually painless and do not cause any symptoms, so a person may not know they have them. However, sometimes they can grow large and cause itching and bleeding. Condyloma acuminata do not become cancer, but they may come back after treatment. Also called genital wart.
  cone biopsy: (kone BY-op-see)
    Pronunciation of dictionary term "cone biopsy"
    A procedure in which a cone-shaped piece of abnormal tissue is removed from the cervix. A scalpel, a laser knife, or a thin wire loop heated by an electric current may be used to remove the tissue. The tissue is then checked under a microscope for signs of disease. Cone biopsy may be used to check for cervical cancer or to treat certain cervical conditions. Types of cone biopsy are LEEP (loop electrosurgical excision procedure) and cold knife conization (cold knife cone biopsy). Also called conization.
  confirmatory clinical trial: (kun-FIR-muh-TOR-ee KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "confirmatory clinical trial"
    A study that confirms how well a new treatment works after it was shown in early-phase clinical trials that it might be beneficial for patients. New drugs that are given an accelerated approval by the U.S. Food and Drug Administration (FDA) to treat a serious or life-threatening disease, such as cancer, are required to be tested in a confirmatory clinical trial. This is done to verify that they really work when they are tested on many more people in a randomized study. The FDA may remove a drug from the market if a confirmatory clinical trial shows that the drug is not beneficial for patients.
  confusion: (kun-FYOO-zhun)
    Pronunciation of dictionary term "confusion"
    A mental state in which one is not thinking clearly.
  congenital: (kun-JEH-nih-tul)
    Pronunciation of dictionary term "congenital"
    A condition or trait present at birth. It may be the result of genetic or non-genetic factors.
    More Information
    - Congenital (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Congenital)
  congenital fibrosarcoma: (kun-JEH-nih-tul FY-broh-sar-KOH-muh)
    Pronunciation of dictionary term "congenital fibrosarcoma"
    A type of cancer that forms in fibrous (connective) tissue. Congenital fibrosarcoma usually occurs in infants and young children but it may also be found before birth by ultrasound. It can occur anywhere in the body. The tumor is often large and fast-growing, but it rarely spreads to other parts of the body. The cancer cells usually have a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). Congenital fibrosarcoma is a type of soft tissue sarcoma. Also called infantile fibrosarcoma.
    More Information
    - Childhood Soft Tissue Sarcoma
  congenital hemangioma: (kun-JEH-nih-tul hee-MAN-jee-OH-muh)
    Pronunciation of dictionary term "congenital hemangioma"
    A benign (not cancer) blood vessel tumor that is fully formed at birth. Congenital hemangiomas usually form on the skin of the head and neck or arms and legs. They may also form in organs, such as the liver. Congenital hemangiomas may be raised or flat and usually appear as purple-red lesions on the skin. Some congenital hemangiomas go away on their own; others only partly go away or do not go away at all. Congenital hemangiomas are a type of vascular tumor.
    More Information
    - Childhood Vascular Tumors
  congenital hypoplastic anemia: (kun-JEH-nih-tul HY-poh-PLAS-tik uh-NEE-mee-uh)
    Pronunciation of dictionary term "congenital hypoplastic anemia"
    A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with congenital hypoplastic anemia may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called Blackfan–Diamond anemia, congenital pure red cell aplasia, DBA, Diamond-Blackfan anemia, erythrogenesis imperfecta, and inherited erythroblastopenia.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  congenital mesoblastic nephroma: (kun-JEH-nih-tul MEH-zoh-BLAS-tik neh-FROH-muh)
    Pronunciation of dictionary term "congenital mesoblastic nephroma"
    A type of kidney tumor that is usually found before birth by ultrasound or within the first 3 months of life. It contains fibroblastic cells (connective tissue cells), and may spread to the other kidney or to nearby tissue. Congenital mesoblastic nephroma is more common in males.
    More Information
    - Wilms Tumor and Other Childhood Kidney Tumors Treatment
  congenital neutropenia: (kon-JEH-nih-tul noo-troh-PEE-nee-uh)
    Pronunciation of dictionary term "congenital neutropenia"
    An inherited disorder in which there is a lower-than-normal number of neutrophils (a type of white blood cell that is important in fighting infections). Infants with the disorder get infections caused by bacteria, and are at an increased risk of acute myelogenous leukemia (AML) or myelodysplasia (a bone marrow disorder). Also called genetic infantile agranulocytosis, infantile genetic agranulocytosis, Kostmann disease, Kostmann neutropenia, and Kostmann syndrome.
    More Information
    - Severe congenital neutropenia (MedlinePlus) (https://medlineplus.gov/genetics/condition/severe-congenital-neutropenia/)
    - Severe congenital neutropenia autosomal recessive 3 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/302/kostmann-disease)
  congenital pure red cell aplasia: (kun-JEH-nih-tul … sel uh-PLAY-zhuh)
    Pronunciation of dictionary term "congenital pure red cell aplasia"
    A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with congenital pure red cell aplasia may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called Blackfan–Diamond anemia, congenital hypoplastic anemia, DBA, Diamond-Blackfan anemia, erythrogenesis imperfecta, and inherited erythroblastopenia.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  congestive heart failure: (kun-JES-tiv hart FAYL-yer)
    Pronunciation of dictionary term "congestive heart failure"
    Weakness of the heart muscle that leads to a buildup of fluid in body tissues.
  conization: (koh-nih-ZAY-shun)
    Pronunciation of dictionary term "conization"
    A procedure in which a cone-shaped piece of abnormal tissue is removed from the cervix. A scalpel, a laser knife, or a thin wire loop heated by an electric current may be used to remove the tissue. The tissue is then checked under a microscope for signs of disease. Conization may be used to check for cervical cancer or to treat certain cervical conditions. Types of conization are LEEP (loop electrosurgical excision procedure) and cold knife conization (cold knife cone biopsy). Also called cone biopsy.
  conjugate: (KON-jih-gut)
    Pronunciation of dictionary term "conjugate"
    A compound formed by chemically joining two or more different substances. For example, an antibody-drug conjugate is made up of a monoclonal antibody that is chemically linked to a drug. Some conjugates are used to treat cancer.
  conjunctiva: (KON-junk-TY-vuh)
    Pronunciation of dictionary term "conjunctiva"
    A membrane that lines the inner surface of the eyelid and also covers the front part of the eye. Conjunctivitis is inflammation of the conjunctiva.
  conjunctivitis: (kun-JUNK-tih-VY-tis)
    Pronunciation of dictionary term "conjunctivitis"
    A condition in which the conjunctiva (membranes lining the eyelids and covering the white part of the eye) become inflamed or infected. Also called pinkeye.
  connecting peptide: (kuh-NEK-ting PEP-tide)
    Pronunciation of dictionary term "connecting peptide"
    A substance made by the pancreas. Connecting peptide and insulin are both part of a larger molecule that gets split apart before being released into the blood. Abnormal blood levels of connecting peptide may occur in certain diseases, such as diabetes or cancer. Also called C-peptide.
  connective tissue: (kuh-NEK-tiv TIH-shoo)
    Pronunciation of dictionary term "connective tissue"
    Tissue that supports, protects, and gives structure to other tissues and organs in the body. Connective tissue also stores fat, helps move nutrients and other substances between tissues and organs, and helps repair damaged tissue. Connective tissue is made up of cells, fibers, and a gel-like substance. Types of connective tissue include bone, cartilage, fat, blood, and lymphatic tissue.
  connexin gene: (kuh-NEK-sin jeen)
    Pronunciation of dictionary term "connexin gene"
    One of a group of related genes called connexins. Connexin genes make proteins that form channels that connect cells that are next to each other. These channels allow substances (such as sodium and potassium) to move from one cell to another. This is important for cells to grow and work normally. Mutations in certain connexin genes may be found in some types of hearing, skin, and peripheral nervous system disorders. They may also be found in some types of cancer.
  conscious sedation: (KON-shus seh-DAY-shun)
    Pronunciation of dictionary term "conscious sedation"
    A level of sedation in which a person is asleep but wakes when spoken to or touched. Conscious sedation is caused by special drugs and is used to help relieve anxiety during certain medical or surgical procedures. Drugs that relieve pain may be given at the same time. Also called moderate sedation.
  consecutive case series: (kun-SEH-kyoo-tiv kays SEER-eez)
    Pronunciation of dictionary term "consecutive case series"
    A clinical study that includes all eligible patients identified by the researchers during the study registration period. The patients are treated in the order in which they are identified. This type of study usually does not have a control group.
  Consensus Development Program: (kun-SEN-sus dee-VEH-lup-ment PROH-gram)
    Pronunciation of dictionary term "Consensus Development Program"
    A program of the National Institutes of Health (https://consensus.nih.gov/) to bring together an independent group of experts to review scientific evidence related to an important public health issue. For a specific issue, a panel of experts (such as doctors and scientists) reviews reports and papers on the subject, listens to information presented by other experts in the field, and hears comments from the general public. Based on the evidence presented, the panel writes a report summarizing the findings, which is made available to the public. The report is not intended to be a practice guideline.
  consent form: (kun-SENT ...)
    Pronunciation of dictionary term "consent form"
    A document with important information about a medical procedure or treatment, a clinical trial, or genetic testing. It also includes information on possible risks and benefits. If a person chooses to take part in the treatment, procedure, trial, or testing, he or she signs the form to give official consent.
  consent process: (kun-SENT PRAH-ses)
    Pronunciation of dictionary term "consent process"
    A process in which patients are given important information, including possible risks and benefits, about a medical procedure or treatment, genetic testing, or a clinical trial. This is to help them decide if they want to be treated, tested, or take part in the trial. Patients are also given any new information that might affect their decision to continue. Also called informed consent.
  consolidation therapy: (kun-SAH-lih-DAY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "consolidation therapy"
    Treatment that is given after cancer has disappeared following the initial therapy. Consolidation therapy is used to kill any cancer cells that may be left in the body. It may include radiation therapy, a stem cell transplant, or treatment with drugs that kill cancer cells. Also called intensification therapy and postremission therapy.
  constipation: (KON-stih-PAY-shun)
    Pronunciation of dictionary term "constipation"
    A condition in which stool becomes hard, dry, and difficult to pass, and bowel movements don’t happen very often. Other symptoms may include painful bowel movements, and feeling bloated, uncomfortable, and sluggish.
    More Information
    - Constipation and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation)
  constitutional acupuncture: (KON-stih-TOO-shuh-nul AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "constitutional acupuncture"
    A type of acupuncture based on a form of Oriental medicine in which treatment is based on a person’s constitution. According to this type of medicine, the constitution is the specific way a person’s organs affect health and how he or she looks, thinks, behaves, and responds to treatment. Also called Korean acupuncture.
  constitutional DNA: (KAWNT-stuh-TOO-shuh-nul...)
    Pronunciation of dictionary term "constitutional DNA"
    The DNA in germ cells (egg and sperm cells that join to form an embryo). Constitutional DNA is the source of DNA for all other cells in the body. Also called germline DNA.
  consultand: (kon-SUL-tand)
    Pronunciation of dictionary term "consultand"
    A person who is receiving genetic counseling.
  contiguous: (kun-TIG-yoo-us)
    Pronunciation of dictionary term "contiguous"
    Touching or very close together.
  contiguous lymphoma: (kun-TIG-yoo-us lim-FOH-muh)
    Pronunciation of dictionary term "contiguous lymphoma"
    Lymphoma in which the lymph nodes containing cancer are next to each other.
  continent reservoir: (KON-tih-nent REH-ser-vwar)
    Pronunciation of dictionary term "continent reservoir"
    A pouch formed from a piece of small intestine to hold urine after the bladder has been removed.
  contingency management: (kun-TIN-jen-see MA-nij-ment)
    Pronunciation of dictionary term "contingency management"
    In medicine, a treatment plan that gives immediate rewards for desired changes in behavior. It is based on the principle that if a good behavior is rewarded, it is more likely to be repeated. This is often used in the treatment of drug and alcohol abuse, and is being studied as a smoking cessation method.
  continuous hyperthermic peritoneal perfusion: (kon-TIN-yoo-us HY-per-THER-mik PAYR-ih-toh-NEE-ul per-FYOO-zhun)
    Pronunciation of dictionary term "continuous hyperthermic peritoneal perfusion"
    A treatment used during surgery in which a heated solution containing anticancer drugs is infused directly into the abdominal cavity through a thin tube. After removal of as much tumor tissue as possible with surgery, continuous hyperthermic peritoneal perfusion is given to kill any remaining tumor cells. It is most often used to treat cancers that have spread to the peritoneum (the lining of the abdominal cavity). Also called CHPP, HIPEC, and hyperthermic intraperitoneal chemotherapy.
  continuous infusion: (kon-TIN-yoo-us in-FYOO-zhun)
    Pronunciation of dictionary term "continuous infusion"
    The administration of a fluid into a blood vessel, usually over a prolonged period of time.
  continuum of care: (kon-TIN-yoo-um … kayr)
    Pronunciation of dictionary term "continuum of care"
    In medicine, describes the delivery of health care over a period of time. In patients with a disease, this covers all phases of illness from diagnosis to the end of life.
  contraception: (KON-truh-SEP-shun)
    Pronunciation of dictionary term "contraception"
    The use of drugs, devices, or surgery to prevent pregnancy. There are many different types of contraception. These include barrier methods to keep sperm from fertilizing the egg, hormone methods, intrauterine devices (IUDs), and surgery to close the fallopian tubes in women or close off the two tubes that carry sperm out of the testicles in men. Also called birth control.
  Contract Research Organization: (KON-trakt REE-serch OR-guh-nih-ZAY-shun)
    Pronunciation of dictionary term "Contract Research Organization"
    A company hired by another company or research center to take over certain parts of running a clinical trial. The company may design, manage, and monitor the trial, and analyze the results. Also called CRO.
  contracture: (kun-TRAK-cher)
    Pronunciation of dictionary term "contracture"
    A permanent tightening of the muscles, tendons, skin, and nearby tissues that causes the joints to shorten and become very stiff. This prevents normal movement of a joint or other body part. Contractures may be caused by injury, scarring, and nerve damage, or by not using the muscles. It may also occur at some point in time after a stem cell transplant that caused chronic graft-versus-host disease.
  contraindication: (KON-truh-IN-dih-KAY-shun)
    Pronunciation of dictionary term "contraindication"
    Anything (including a symptom or medical condition) that is a reason for a person to not receive a particular treatment or procedure because it may be harmful. For example, having a bleeding disorder is a contraindication for taking aspirin because treatment with aspirin may cause excess bleeding.
  contralateral: (KON-truh-LA-teh-rul)
    Pronunciation of dictionary term "contralateral"
    Having to do with the opposite side of the body.
  contralateral prophylactic mastectomy: (KON-truh-LA-teh-rul PROH-fih-LAK-tik ma-STEK-toh-mee)
    Pronunciation of dictionary term "contralateral prophylactic mastectomy"
    Surgery to remove the healthy breast in a person who is having or has had the other breast with cancer removed. Contralateral prophylactic mastectomy may be done to reduce the risk of a second breast cancer in people who are at very high risk. Also called CPM.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  contrast esophagram: (KON-trast ee-SAH-fuh-gram)
    Pronunciation of dictionary term "contrast esophagram"
    A series of x-ray pictures of the esophagus taken after a patient drinks a liquid containing barium sulfate (a form of the silver-white metallic element barium). The barium sulfate coats and outlines the inner wall of the esophagus so that it can be seen on the x-ray pictures. Also called esophagram.
    Barium swallow for esophageal cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as esophageal cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. The inset x-ray image shows a narrowing at the end of the esophagus caused by cancer.
  contrast material: (KON-trast muh-TEER-ee-ul)
    Pronunciation of dictionary term "contrast material"
    A dye or other substance that helps show abnormal areas inside the body. It is given by injection into a vein, by enema, or by mouth. Contrast material may be used with x-rays, CT scans, MRI, or other imaging tests.
  control animal: (kun-TROLE A-nih-mul)
    Pronunciation of dictionary term "control animal"
    An animal in a study that does not receive the treatment being tested. Comparing the health of control animals with the health of treated animals allows researchers to evaluate the effects of a treatment more accurately.
  control group: (kun-TROLE groop)
    Pronunciation of dictionary term "control group"
    In a clinical trial, the group that does not receive the new treatment being studied. This group is compared to the group that receives the new treatment, to see if the new treatment works.
  controlled clinical trial: (kun-TROLD KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "controlled clinical trial"
    A clinical study that includes a comparison (control) group. The comparison group receives a placebo, another treatment, or no treatment at all.
  controlled study: (kun-TROLD STUH-dee)
    Pronunciation of dictionary term "controlled study"
    An experiment or clinical trial that includes a comparison (control) group.
  controlled substance: (kun-TROLD SUB-stunts)
    Pronunciation of dictionary term "controlled substance"
    A drug or other substance that is tightly controlled by the government because it may be abused or cause addiction. The control applies to the way the substance is made, used, handled, stored, and distributed. Controlled substances include opioids, stimulants, depressants, hallucinogens, and anabolic steroids. Controlled substances with known medical use, such as morphine, Valium, and Ritalin, are available only by prescription from a licensed medical professional. Other controlled substances, such as heroin and LSD, have no known medical use and are illegal in the United States.
  conventional mammography: (kun-VEN-shuh-nul ma-MAH-gruh-fee)
    Pronunciation of dictionary term "conventional mammography"
    A procedure that uses x-rays to take pictures of the inside of the breast and stores the images on x-ray film. Conventional mammography may be used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). Also called film mammography.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  conventional medicine: (kun-VEN-shuh-nul MEH-dih-sin)
    Pronunciation of dictionary term "conventional medicine"
    A system in which medical doctors and other health care professionals (such as nurses, pharmacists, and therapists) treat symptoms and diseases using drugs, radiation, or surgery. Also called allopathic medicine, biomedicine, mainstream medicine, orthodox medicine, and Western medicine.
  conventional renal cell carcinoma: (kun-VEN-shuh-nul REE-nul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "conventional renal cell carcinoma"
    A type of kidney cancer in which the cells look clear or very pale when viewed under a microscope. Conventional renal cell carcinoma begins in cells that line tiny tubes in the kidney. These tubes return filtered nutrients, fluids, and other substances that the body needs back to the blood. Conventional renal cell carcinoma is the most common type of kidney cancer in adults. People with an inherited condition called von Hippel-Lindau syndrome are at an increased risk of developing conventional renal cell carcinoma. Also called ccRCC, clear cell renal cell cancer, and clear cell renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    - Clear Cell Renal Cell Carcinoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-kidney-tumors/clear-cell-renal-cell-carcinoma)
  conventional therapy: (kun-VEN-shuh-nul THAYR-uh-pee)
    Pronunciation of dictionary term "conventional therapy"
    Treatment that is widely accepted and used by most health care professionals. It is different from alternative or complementary therapies, which are not as widely used. Examples of conventional therapy for cancer include chemotherapy, radiation therapy, and surgery. Also called conventional treatment.
    More Information
    - Cancer Treatment (https://www.cancer.gov/about-cancer/treatment)
  conventional treatment: (kun-VEN-shuh-nul TREET-ment)
    Pronunciation of dictionary term "conventional treatment"
    Treatment that is widely accepted and used by most health care professionals. It is different from alternative or complementary therapies, which are not as widely used. Examples of conventional treatment for cancer include chemotherapy, radiation therapy, and surgery. Also called conventional therapy.
    More Information
    - Cancer Treatment (https://www.cancer.gov/about-cancer/treatment)
  convulsion: (kun-VUL-zhun)
    Pronunciation of dictionary term "convulsion"
    A condition in which muscles contract and relax quickly and cause uncontrolled shaking of the body. Head injuries, high fevers, some medical disorders, and certain drugs can cause convulsions. They may also occur during seizures caused by epilepsy.
  Coombs test: (koomz test)
    Pronunciation of dictionary term "Coombs' test"
    A laboratory test to identify antibodies that can bind to the surface of red blood cells or platelets and destroy them. This test is used to diagnose certain blood disorders in which patients make antibodies to their own red blood cells or platelets. It is also used to determine blood type. Also called antiglobulin test.
  copanlisib hydrochloride: (koh-PAN-lih-sib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "copanlisib hydrochloride"
    A drug used to treat adults with follicular lymphoma that came back after treatment with at least two other systemic therapies. It is also being studied in the treatment of other types of cancer. Copanlisib hydrochloride blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called Aliqopa.
    More Information
    - Copanlisib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/copanlisibhydrochloride)
  copay: (KOH-pay)
    Pronunciation of dictionary term "copay"
    The amount of money that a patient with health insurance pays for each health care service, such as a visit to the doctor, laboratory tests, prescription medicines, and hospital stays. The amount of the copay usually depends on the type of health care service. Also called copayment.
  copayment: (KOH-pay-ment)
    Pronunciation of dictionary term "copayment"
    The amount of money that a patient with health insurance pays for each health care service, such as a visit to the doctor, laboratory tests, prescription medicines, and hospital stays. The amount of the copayment usually depends on the type of health care service. Also called copay.
  COPD: A type of lung disease marked by permanent damage to tissues in the lungs, making it hard to breathe. COPD includes chronic bronchitis, in which the bronchi (large air passages) are inflamed and scarred, and emphysema, in which the alveoli (tiny air sacs) are damaged. It develops over many years and is usually caused by cigarette smoking. Also called chronic obstructive pulmonary disease.
  COPDAC: An abbreviation for a chemotherapy combination that is often used with radiation therapy to treat certain types of childhood Hodgkin lymphoma in males. It includes the drugs cyclophosphamide, vincristine sulfate (Oncovin), prednisone, and dacarbazine. Also called COPDAC regimen.
    More Information
    - COPDAC (https://www.cancer.gov/about-cancer/treatment/drugs/COPDAC)
  COPDAC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "COPDAC regimen"
    An abbreviation for a chemotherapy combination that is often used with radiation therapy to treat certain types of childhood Hodgkin lymphoma in males. It includes the drugs cyclophosphamide, vincristine sulfate (Oncovin), prednisone, and dacarbazine. Also called COPDAC.
    More Information
    - COPDAC (https://www.cancer.gov/about-cancer/treatment/drugs/COPDAC)
  cope: (kope)
    Pronunciation of dictionary term "cope"
    To adjust to new situations and overcome problems.
    More Information
    - Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
  Copiktra: (koh-PIK-truh)
    Pronunciation of dictionary term "Copiktra"
    A drug used to treat adults with chronic lymphocytic leukemia or small lymphocytic lymphoma that came back or did not get better after treatment with at least two other therapies. It is also being studied in the treatment of other types of cancer. Copiktra blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called duvelisib.
    More Information
    - Duvelisib (https://www.cancer.gov/about-cancer/treatment/drugs/duvelisib)
  coping skills: (KOH-ping skilz)
    Pronunciation of dictionary term "coping skills"
    The methods a person uses to deal with stressful situations. These may help a person face a situation, take action, and be flexible and persistent in solving problems.
    More Information
    - Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
  copolymer: (KOH-pah-lih-mer)
    Pronunciation of dictionary term "copolymer"
    A molecule made up of two or more different kinds of small molecules called monomers. The monomers are joined together in a repeating pattern.
  COPP: An abbreviation for a chemotherapy combination used to treat Hodgkin and non-Hodgkin lymphomas. It includes the drugs cyclophosphamide, vincristine sulfate (Oncovin), procarbazine hydrochloride, and prednisone. Also called COPP regimen.
    More Information
    - COPP (https://www.cancer.gov/about-cancer/treatment/drugs/COPP)
  COPP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "COPP regimen"
    An abbreviation for a chemotherapy combination used to treat Hodgkin and non-Hodgkin lymphomas. It includes the drugs cyclophosphamide, vincristine sulfate (Oncovin), procarbazine hydrochloride, and prednisone. Also called COPP.
    More Information
    - COPP (https://www.cancer.gov/about-cancer/treatment/drugs/COPP)
  COPP-ABV: An abbreviation for a chemotherapy combination used to treat Hodgkin lymphoma in children. It may be used with radiation therapy. COPP-ABV includes the drugs cyclophosphamide, vincristine sulfate (Oncovin), procarbazine hydrochloride, prednisone, doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, and vinblastine sulfate. Also called COPP-ABV regimen.
  COPP-ABV regimen: (… REH-jih-men)
    Pronunciation of dictionary term "COPP-ABV regimen"
    An abbreviation for a chemotherapy combination used to treat Hodgkin lymphoma in children. It may be used with radiation therapy. COPP-ABV regimen includes the drugs cyclophosphamide, vincristine sulfate (Oncovin), procarbazine hydrochloride, prednisone, doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, and vinblastine sulfate. Also called COPP-ABV.
  copper Cu 64-ATSM: (KAH-per …)
    Pronunciation of dictionary term "copper Cu 64-ATSM"
    A substance being studied in PET imaging to detect certain types of tumors. Copper Cu 64 is a radioactive substance. It is linked to ATSM, which is taken up by tissues that have low levels of oxygen, such as some tumor tissues. A PET scanner is used to detect which cells in the body have taken up copper Cu 64-ATSM. It is a type of radioimaging agent.
  CoQ10: A nutrient that the body needs in small amounts to function and stay healthy. CoQ10 helps mitochondria (small structures in the cell) make energy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). CoQ10 is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, beef, soybeans, peanuts, and spinach. It is being studied in the prevention and treatment of some types of cancer and heart disease and in the relief of side effects caused by some cancer treatments. Also called coenzyme Q10, Q10, ubiquinone, and vitamin Q10.
    More Information
    - Coenzyme Q10
  cordectomy: (kor-DEK-toh-mee)
    Pronunciation of dictionary term "cordectomy"
    An operation on the vocal cords or on the spinal cord.
  Corderone: (KOR-deh-rone)
    Pronunciation of dictionary term "Corderone"
    A drug used to treat certain types of abnormal heart rhythms that have not gotten better with other drugs. Corderone affects the electrical activity of the heart. It is a type of antiarrhythmic agent. Also called amiodarone hydrochloride.
  cordotomy: (kor-DAH-toh-mee)
    Pronunciation of dictionary term "cordotomy"
    A surgical procedure that is used to relieve pain by cutting certain nerves in the spinal cord that send pain signals. Cutting these nerves blocks feelings of pain and feelings of hot and cold. In cancer, a cordotomy is usually done for patients near the end of life to relieve severe pain that cannot be relieved by other treatments.
  cordycepin: (KOR-duh-see-pin)
    Pronunciation of dictionary term "cordycepin"
    An anticancer drug that belongs to a family of drugs called antitumor antibiotics.
  core biopsy: (... BY-op-see)
    Pronunciation of dictionary term "core biopsy"
    The removal of a tissue sample with a wide needle for examination under a microscope. Also called core needle biopsy.
  core needle biopsy: (... NEE-dul BY-op-see)
    Pronunciation of dictionary term "core needle biopsy"
    The removal of a tissue sample with a wide needle for examination under a microscope. Also called core biopsy.
  Coreg: (KOR-eg)
    Pronunciation of dictionary term "Coreg"
    A drug used to treat high blood pressure and certain heart problems. It is also being studied in the prevention and treatment of side effects caused by some anticancer drugs. Coreg blocks certain receptors on nerve cells and causes blood vessels to dilate (widen). It is a type of antihypertensive agent and a type of antianginal agent. Also called carvedilol phosphate.
  Coriolus versicolor extract: (KOR-ee-OH-lus VER-sih-KUH-ler EK-strakt)
    Pronunciation of dictionary term "Coriolus versicolor extract"
    A substance being studied in the treatment of breast cancer and other types of cancer. Coriolus versicolor is a type of mushroom. Its extract is used with other treatments in some cultures to treat cancer and other conditions. The extract may boost the immune system, slow the growth of some tumor cells, and lessen the side effects of chemotherapy and radiation therapy. It is a type of biological response modifier (BRM) and a type of dietary supplement.
    More Information
    - Medicinal Mushrooms
  cornea: (KOR-nee-uh)
    Pronunciation of dictionary term "cornea"
    The transparent part of the eye that covers the iris and the pupil and allows light to enter the inside.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  coronary artery bypass grafting: (KOR-uh-NAYR-ee AR-tuh-ree BY-pas GRAF-ting)
    Pronunciation of dictionary term "coronary artery bypass grafting"
    Surgery in which a healthy blood vessel taken from another part of the body is used to make a new path for blood around a blocked artery leading to the heart. This restores the flow of oxygen and nutrients to the heart. Also called aortocoronary bypass and CABG.
  coronary artery disease: (KOR-uh-NAYR-ee AR-tuh-ree dih-ZEEZ)
    Pronunciation of dictionary term "coronary artery disease"
    A disease in which there is a narrowing or blockage of the coronary arteries (blood vessels that carry blood and oxygen to the heart). Coronary artery disease is usually caused by atherosclerosis (a buildup of fatty material and plaque inside the coronary arteries). The disease may cause chest pain, shortness of breath during exercise, and heart attacks. The risk of coronary artery disease is increased by having a family history of coronary artery disease before age 50, older age, smoking tobacco, high blood pressure, high cholesterol, diabetes, lack of exercise, and obesity. Also called CAD and coronary heart disease.
  coronary heart disease: (KOR-uh-NAYR-ee hart dih-ZEEZ)
    Pronunciation of dictionary term "coronary heart disease"
    A disease in which there is a narrowing or blockage of the coronary arteries (blood vessels that carry blood and oxygen to the heart). Coronary heart disease is usually caused by atherosclerosis (a buildup of fatty material and plaque inside the coronary arteries). The disease may cause chest pain, shortness of breath during exercise, and heart attacks. The risk of coronary heart disease is increased by having a family history of coronary heart disease before age 50, older age, smoking tobacco, high blood pressure, high cholesterol, diabetes, lack of exercise, and obesity. Also called CAD and coronary artery disease.
  coronavirus: (kuh-ROH-nuh-VY-rus)
    Pronunciation of dictionary term "coronavirus"
    One of a large family of viruses that can infect people and some animals and cause a respiratory illness. There are many different coronaviruses. Some cause mild diseases, such as the common cold, while others cause more serious respiratory illnesses, such as coronavirus disease 19 (COVID-19).
    More Information
    - COVID-19 and Cancer (https://www.cancer.gov/about-cancer/coronavirus)
  coronavirus disease 19: (kuh-ROH-nuh-VY-rus dih-ZEEZ …)
    Pronunciation of dictionary term "coronavirus disease 19"
    A highly contagious respiratory disease caused by the SARS-CoV-2 virus. SARS-CoV-2 is thought to spread from person to person through droplets released when an infected person coughs, sneezes, or talks. It may also be spread by touching a surface with the virus on it and then touching one’s mouth, nose, or eyes, but this is less common. The most common signs and symptoms of coronavirus disease 19 are fever, cough, and trouble breathing. Fatigue, muscle pain, chills, headache, sore throat, runny nose, nausea or vomiting, diarrhea, and a loss of taste or smell may also occur. The signs and symptoms may be mild or severe and usually appear 2 to 14 days after exposure to the SARS-CoV-2 virus. Some people may not have any symptoms but are still able to spread the virus. Most people with coronavirus disease 19 recover without needing special treatment. But other people are at higher risk of serious illness. Those at higher risk include older adults and people with serious medical problems, such as heart, lung, or kidney disease, diabetes, cancer, or a weak immune system. Serious illness may include life-threatening pneumonia and organ failure. Research is being done to treat coronavirus disease 19 and to prevent infection with SARS-CoV-2. Also called COVID-19.
    More Information
    - COVID-19: What People with Cancer Should Know (https://www.cancer.gov/contact/emergency-preparedness/coronavirus)
    - COVID-19 (Centers for Disease Control and Prevention) (https://www.cdc.gov/coronavirus/2019-ncov/index.html)
  corpus cavernosum: (KOR-pus KA-ver-NOH-sum)
    Pronunciation of dictionary term "corpus cavernosum"
    One of two columns of spongy tissue that runs through the shaft (body) of the penis. The corpus cavernosum forms most of the penis and contains blood vessels that fill with blood to help make an erection.
    Anatomy of the penis. The parts of the penis are the base, shaft, glans, and foreskin. The tissues that make up the penis include the dorsal nerve, blood vessels, connective tissue, and erectile tissue (corpus cavernosum and corpus spongiosum). The urethra passes from the bladder to the tip of the penis.
    Anatomy of the penis; drawing shows the base, shaft, glans, foreskin, and urethral opening. Also shown are the scrotum, prostate, pubic bone, and lymph nodes. An inset shows a cross section of the inside of the penis, including the blood vessels, dorsal nerve, connective tissue, erectile tissue (corpus cavernosum and corpus spongiosum), and urethra.
  corpus spongiosum: (KOR-pus SPUN-jee-OH-sum)
    Pronunciation of dictionary term "corpus spongiosum"
    A column of spongy tissue that runs through the shaft (body) and glans (head) of the penis. The corpus spongiosum surrounds the urethra (the tube through which urine and sperm pass from the body). It contains blood vessels that fill with blood to help make an erection and keep the urethra open during the erection.
    Anatomy of the penis. The parts of the penis are the base, shaft, glans, and foreskin. The tissues that make up the penis include the dorsal nerve, blood vessels, connective tissue, and erectile tissue (corpus cavernosum and corpus spongiosum). The urethra passes from the bladder to the tip of the penis.
    Anatomy of the penis; drawing shows the base, shaft, glans, foreskin, and urethral opening. Also shown are the scrotum, prostate, pubic bone, and lymph nodes. An inset shows a cross section of the inside of the penis, including the blood vessels, dorsal nerve, connective tissue, erectile tissue (corpus cavernosum and corpus spongiosum), and urethra.
  corpus uteri: (KOR-pus YOO-TEH-ry)
    Pronunciation of dictionary term "corpus uteri"
    The body of the uterus.
  corticosteroid: (KOR-tih-koh-STAYR-oyd)
    Pronunciation of dictionary term "corticosteroid"
    Any steroid hormone made in the adrenal cortex (the outer part of the adrenal gland). They are also made in the laboratory. Corticosteroids have many different effects in the body, and are used to treat many different conditions. They may be used as hormone replacement, to suppress the immune system, and to treat some side effects of cancer and its treatment. Corticosteroids are also used to treat certain lymphomas and lymphoid leukemias.
  corticotropin: (KOR-tih-koh-TROH-pin)
    Pronunciation of dictionary term "corticotropin"
    A hormone made in the pituitary gland. Corticotropin acts on the outer part of the adrenal gland to control its release of corticosteroid hormones. More corticotropin is made during times of stress. Also called ACTH and adrenocorticotropic hormone.
  cortisol: (KOR-tih-sol)
    Pronunciation of dictionary term "cortisol"
    A hormone made by the adrenal cortex (the outer layer of the adrenal gland). It helps the body use glucose (a sugar), protein, and fats. Cortisol made in the laboratory is called hydrocortisone. It is used to treat many conditions, including inflammation, allergies, and some cancers. Cortisol is a type of glucocorticoid hormone.
  cortisone: (KOR-tih-sone)
    Pronunciation of dictionary term "cortisone"
    A natural steroid hormone produced in the adrenal gland. It can also be made in the laboratory. Cortisone reduces swelling and can suppress immune responses.
  Corynebacterium granulosum: (kah-RY-nee-bak-TEER-ee-um GRAN-yoo-LOH-sum)
    A bacterium that can cause skin disorders. Substances taken from this bacterium can stimulate the immune system and may help kill cancer cells.
  cosibelimab: (KOH-sih-BEH-lih-mab)
    Pronunciation of dictionary term "cosibelimab"
    A drug used to treat adults with cutaneous squamous cell carcinoma (a type of skin cancer) that has spread and cannot be cured with surgery or radiation therapy. It is also being studied in the treatment of other types of cancer. Cosibelimab binds to a protein called PD-L1, which is found on some normal cells and some types of cancer cells. Blocking this protein may help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Unloxcyt.
  Cosmegen: (KOS-muh-jin)
    Pronunciation of dictionary term "Cosmegen"
    A drug that comes from the bacterium Streptomyces parvulus and is used alone or with other drugs to treat adults and children with Ewing sarcoma, gestational trophoblastic tumor, rhabdomyosarcoma, Wilms tumor, or certain types of testicular cancer and adults with certain types of solid tumors. It is also being studied in the treatment of other types of cancer. Cosmegen damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic. Also called actinomycin D and dactinomycin.
    More Information
    - Dactinomycin (https://www.cancer.gov/about-cancer/treatment/drugs/dactinomycin)
  cost sharing: (… SHAYR-ing)
    Pronunciation of dictionary term "cost sharing"
    A term used to describe the practice of dividing the cost of health care services between the patient and the insurance plan. For example, if a plan pays 80% of the cost of a service, then the patient pays the remaining 20% of the cost. The most common form of cost sharing is for deductibles, coinsurance, and copayments. Cost sharing usually does not include the payment of monthly health insurance premiums or the cost of noncovered health care services.
  Costello syndrome: (KOS-teh-loh SIN-drome)
    Pronunciation of dictionary term "Costello syndrome"
    A rare genetic disorder that is caused by a mutation (change) in the HRAS gene. Costello syndrome is marked by shorter-than-average height, unusual facial features, extra folds of skin (especially on the neck, hands, and feet), loose joints, heart problems, and learning and developmental delays. People with Costello syndrome may develop small, non-cancerous wart-like growths called papillomas around the nose, mouth, or anus. They also have an increased risk of developing certain types of cancer, especially rhabdomyosarcoma (a type of soft tissue tumor) and neuroblastoma (cancer that forms from immature nerve cells).
    More Information
    - Costello syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/1550/costello-syndrome)
    - Costello syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/costello-syndrome/)
  Cotellic: (coh-TEL-lik)
    Pronunciation of dictionary term "Cotellic"
    A drug used alone to treat adults with a group of blood disorders called histiocytic neoplasms and with vemurafenib to treat adults with melanoma that has spread or cannot be removed by surgery and has a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Cotellic blocks proteins called MEK1 and MEK2, which may help keep tumor cells from growing. It is a type of kinase inhibitor. Also called cobimetinib fumarate.
    More Information
    - Cobimetinib Fumarate (https://www.cancer.gov/about-cancer/treatment/drugs/cobimetinib)
  cotinine: (KOH-tuh-neen)
    Pronunciation of dictionary term "cotinine"
    A chemical substance formed by the breakdown of nicotine in the body. Nicotine is an addictive, harmful chemical found in tobacco and tobacco products, including cigarettes and chewing tobacco. Exposure to nicotine can be measured by checking the amount of cotinine in the blood, urine, or saliva in smokers and in nonsmokers exposed to secondhand smoke. Cotinine stays in the body longer than nicotine and is used to help monitor tobacco use and the use of nicotine replacement therapy in people trying to stop smoking.
  cottonseed meal toxin: (KAH-tun-SEED meel TOK-sin)
    Pronunciation of dictionary term "cottonseed meal toxin"
    A substance being studied in the treatment of several types of cancer. It comes from the seed of the cotton plant (Gossypium). It blocks the growth of cells and may kill cancer cells. Cottonseed meal toxin may also act as a male contraceptive (a type of birth control).
  coumarin: (KOO-muh-rin)
    Pronunciation of dictionary term "coumarin"
    A substance used to make drugs that prevent and treat blood clots in blood vessels and treat certain heart conditions. Coumarin is taken from certain plants and can also be made in the laboratory. It is a type of anticoagulant.
  coumestan: (KOO-meh-stan)
    Pronunciation of dictionary term "coumestan"
    An estrogen-like substance (phytoestrogen) made by some plants. Coumestans may have anticancer effects.
  coumestrol: (KOO-meh-strol)
    Pronunciation of dictionary term "coumestrol"
    A type of coumestan. Coumestans are estrogen-like substances (phytoestrogens) made by some plants. Coumestans may have anticancer effects.
  counseling: (KOWN-suh-ling)
    Pronunciation of dictionary term "counseling"
    The process by which a professional counselor helps a person cope with mental or emotional distress, and understand and solve personal problems.
    More Information
    - Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
  counselor: (KOWN-seh-ler)
    Pronunciation of dictionary term "counselor"
    A specialist who talks to patients and their families about emotional and personal matters, and can help them make decisions. Also called mental health counselor.
  course of treatment: (kors ... TREET-ment)
    Pronunciation of dictionary term "course of treatment"
    A treatment plan made up of several cycles of treatment. For example, treatment given for one week followed by three weeks of rest (no treatment) is one treatment cycle. When a treatment cycle is repeated multiple times on a regular schedule, it makes up a course of treatment. A course of treatment can last for several months. Also called treatment course.
  COVID-19: (KOH-vid …)
    Pronunciation of dictionary term "COVID-19"
    A highly contagious respiratory disease caused by the SARS-CoV-2 virus. SARS-CoV-2 is thought to spread from person to person through droplets released when an infected person coughs, sneezes, or talks. It may also be spread by touching a surface with the virus on it and then touching one’s mouth, nose, or eyes, but this is less common. The most common signs and symptoms of COVID-19 are fever, cough, and trouble breathing. Fatigue, muscle pain, chills, headache, sore throat, runny nose, nausea or vomiting, diarrhea, and a loss of taste or smell may also occur. The signs and symptoms may be mild or severe and usually appear 2 to 14 days after exposure to the SARS-CoV-2 virus. Some people may not have any symptoms but are still able to spread the virus. Most people with COVID-19 recover without needing special treatment. But other people are at higher risk of serious illness. Those at higher risk include older adults and people with serious medical problems, such as heart, lung, or kidney disease, diabetes, cancer, or a weak immune system. Serious illness may include life-threatening pneumonia and organ failure. Research is being done to treat COVID-19 and to prevent infection with SARS-CoV-2. Also called coronavirus disease 19.
    More Information
    - COVID-19: What People with Cancer Should Know (https://www.cancer.gov/contact/emergency-preparedness/coronavirus)
    - COVID-19 (Centers for Disease Control and Prevention) (https://www.cdc.gov/coronavirus/2019-ncov/index.html)
  Cowden disease: (KOW-den dih-ZEEZ)
    Pronunciation of dictionary term "Cowden disease"
    A rare inherited disorder marked by the presence of many benign (not cancer) growths called hamartomas and an increased risk of cancer. Hamartomas form in different parts of the body, especially the skin, mouth, and gastrointestinal tract. Other benign tumors may also occur in the thyroid, breast, uterus, soft tissue, and brain. Other signs and symptoms include a larger-than-average head, abnormal skin changes, blood vessel problems, autism spectrum disorder, and learning and developmental delays. People with Cowden disease have an increased risk of developing certain types of cancer, including melanoma and cancers of the breast, thyroid, endometrium, kidney, colon, and rectum. Cowden disease is usually caused by mutations (changes) in the PTEN gene. Also called Cowden syndrome and multiple hamartoma syndrome.
    More Information
    - Cowden syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6202/cowden-syndrome)
    - Cowden syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/cowden-syndrome/)
  Cowden syndrome: (KOW-den SIN-drome)
    Pronunciation of dictionary term "Cowden syndrome"
    A rare inherited disorder marked by the presence of many benign (not cancer) growths called hamartomas and an increased risk of cancer. Hamartomas form in different parts of the body, especially the skin, mouth, and gastrointestinal tract. Other benign tumors may also occur in the thyroid, breast, uterus, soft tissue, and brain. Other signs and symptoms include a larger-than-average head, abnormal skin changes, blood vessel problems, autism spectrum disorder, and learning and developmental delays. People with Cowden syndrome have an increased risk of developing certain types of cancer, including melanoma and cancers of the breast, thyroid, endometrium, kidney, colon, and rectum. Cowden syndrome is usually caused by mutations (changes) in the PTEN gene. Also called Cowden disease and multiple hamartoma syndrome.
    More Information
    - Cowden syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6202/cowden-syndrome)
    - Cowden syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/cowden-syndrome/)
  COX inhibitor: (kox in-HIH-bih-ter)
    Pronunciation of dictionary term "COX inhibitor"
    A type of drug that is used to treat inflammation and pain, and is being studied in the prevention and treatment of cancer. COX inhibitors belong to the family of drugs called nonsteroidal anti-inflammatory drugs (NSAIDs). Also called cyclooxygenase inhibitor.
  COX-2: An enzyme that speeds up the formation of substances that cause inflammation and pain. It may also cause tumor cells to grow. Some tumors have high levels of COX-2 and blocking its activity may reduce tumor growth. Also called cyclooxygenase-2 and prostaglandin-endoperoxide synthase 2.
  COX-2 inhibitor: (... in-HIH-bih-ter)
    Pronunciation of dictionary term "COX-2 inhibitor"
    A nonsteroidal anti-inflammatory drug used to relieve pain and inflammation. COX-2 inhibitors are being studied in the prevention of colon polyps, and as anticancer drugs. Also called cyclooxygenase-2 inhibitor.
  Cozaar: (KOH-zar)
    Pronunciation of dictionary term "Cozaar"
    A drug used to treat high blood pressure. Cozaar blocks the action of chemicals that make blood vessels constrict (get narrower). It is a type of angiotensin II receptor antagonist. Also called losartan potassium.
  CP: A chemotherapy combination used to treat chronic lymphocytic leukemia (CLL). It includes the drugs chlorambucil hydrochloride and prednisone. Also called chlorambucil-prednisone, chlorambucil-prednisone regimen, and CP regimen.
    More Information
    - CHLORAMBUCIL-PREDNISONE (https://www.cancer.gov/about-cancer/treatment/drugs/CHLORAMBUCIL-PREDNISONE)
  CP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CP regimen"
    A chemotherapy combination used to treat chronic lymphocytic leukemia (CLL). It includes the drugs chlorambucil hydrochloride and prednisone. Also called chlorambucil-prednisone, chlorambucil-prednisone regimen, and CP.
    More Information
    - CHLORAMBUCIL-PREDNISONE (https://www.cancer.gov/about-cancer/treatment/drugs/CHLORAMBUCIL-PREDNISONE)
  CP-358,774: A drug used alone to treat certain types of non-small cell lung cancer and with gemcitabine hydrochloride to treat certain types of pancreatic cancer. It is also being studied in the treatment of other types of cancer. CP-358,774 blocks a protein called EGFR, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called erlotinib hydrochloride, OSI-774, and Tarceva.
    More Information
    - Erlotinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/erlotinibhydrochloride)
  CP-4055: A drug used to treat advanced acute myeloid leukemia (AML). It is a form of the anticancer drug cytarabine that may work in patients with leukemia that is resistant to cytarabine. CP-4055 blocks cell division and may kill cancer cells. It is a type of antimetabolite. Also called Elacyt and elacytarabine.
  CP-547,632: A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called vascular endothelial growth factor (VEGF) receptor inhibitors and angiogenesis inhibitors.
  CP-609,754: A substance that is being studied in the treatment of cancer.
  CP-724,714: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called ErbB receptor tyrosine kinase inhibitors.
  CP/CPPS: A condition of the prostate gland that continues or gets worse over a long period of time. Symptoms include body aches, pain in the lower back and genital area, a burning feeling during urination, and problems with emptying the bladder all the way. Also called chronic prostatitis/chronic pelvic pain syndrome.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  CP4071: A substance that is being studied in the treatment of cancer.
  CpG 7909: A substance that is being studied in the treatment of some types of cancer. It belongs to the family of drugs called biological response modifiers. Also called PF-3512676 and ProMune.
  CPM: Surgery to remove the healthy breast in a person who is having or has had the other breast with cancer removed. CPM may be done to reduce the risk of a second breast cancer in people who are at very high risk. Also called contralateral prophylactic mastectomy.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  CPR: An emergency procedure used to restart a person’s heartbeat and breathing after one or both have stopped. It involves giving strong, rapid pushes to the chest to keep blood moving through the body. Usually, it also involves blowing air into the person’s mouth to help with breathing and send oxygen to the lungs. Also called cardiopulmonary resuscitation.
  CPT 11: A drug used alone or with other drugs to treat colorectal cancer that has spread to other parts of the body. It is used in patients whose cancer has not already been treated or whose cancer has recurred (come back) or has gotten worse after treatment with anticancer drugs that included fluorouracil. It is also being studied in the treatment of other types of cancer. CPT 11 blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called Camptosar and irinotecan hydrochloride.
    More Information
    - Irinotecan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
  CQS: A substance being studied in the treatment of cancer. It is a type of topoisomerase inhibitor. Also called chloroquinoxaline sulfonamide.
  CRA-024781: A substance being studied in the treatment of several types of cancer. It blocks enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase (HDAC) inhibitor.
  cramp: (kramp)
    Pronunciation of dictionary term "cramp"
    A sharp pain that occurs when a muscle suddenly contracts (tightens up). Cramps commonly occur in the abdomen and legs.
  cranial nerve: (KRAY-nee-ul nerv)
    Pronunciation of dictionary term "cranial nerve"
    One of twelve pairs of nerves that pass from the brain, through openings in the skull, to different areas of the head, neck, chest, and abdomen. The cranial nerves send information between the brain and the sense organs (the eyes, ears, nose, and tongue). They also send information to the muscles in the face, head, neck, and other organs in the body, including the larynx (voice box), heart, lungs, stomach, and intestines. The cranial nerves are part of the peripheral nervous system.
  craniopharyngioma: (KRAY-nee-oh-fuh-RIN-jee-OH-muh)
    Pronunciation of dictionary term "craniopharyngioma"
    A rare, benign (not cancer) brain tumor that usually forms near the pituitary gland and the hypothalamus. Craniopharyngiomas are slow-growing and do not spread to other parts of the brain or to other parts of the body. However, they may grow and press on nearby parts of the brain, including the pituitary gland, hypothalamus, optic chiasm, optic nerves, and fluid-filled spaces in the brain. This may cause problems with growth, vision, and making certain hormones. Craniopharyngiomas usually occur in children and young adults.
    More Information
    - Childhood Craniopharyngioma
    Craniopharyngiomas are rare brain tumors that usually form near the pituitary gland and the hypothalamus. They are benign (not cancer) and do not spread to other parts of the brain or to other parts of the body. However, they may grow and press on nearby parts of the brain, including the pituitary gland, optic chiasm, and optic nerve. Craniopharyngiomas usually occur in children and young adults.
    Drawing of the inside of the brain showing where craniopharyngiomas may form. A pullout shows a tumor between the hypothalamus and the optic chiasm. Also shown is the optic nerve, the pituitary gland, and the sphenoid sinus.
  craniotomy: (KRAY-nee-AH-toh-mee)
    Pronunciation of dictionary term "craniotomy"
    An operation in which a small hole is made in the skull or a piece of bone from the skull is removed to show part of the brain. A craniotomy may be done to remove a brain tumor or a sample of brain tissue. It may also be done to remove blood or blood clots from the brain, relieve pressure in the brain after an injury or stroke, repair a skull fracture or brain aneurysm (a bulge in a blood vessel wall), or treat other brain conditions. The piece of bone that is removed from the skull is usually put back in place after the surgery has been done.
    Craniotomy: An opening is made in the skull and a piece of the skull is removed to show part of the brain.
    Drawing of a craniotomy showing a section of the scalp that has been pulled back to remove a piece of the skull; the dura covering the brain has been opened to expose the brain. The layer of muscle under the scalp is also shown.
  cranium: (KRAY-nee-um)
    Pronunciation of dictionary term "cranium"
    The bones that form the head. The cranium is made up of cranial bones (bones that surround and protect the brain) and facial bones (bones that form the eye sockets, nose, cheeks, jaw, and other parts of the face). An opening at the base of the cranium is where the spinal cord connects to the brain. Also called skull.
  craving: (KRAY-ving)
    Pronunciation of dictionary term "craving"
    A strong, urgent, or abnormal desire for a certain substance or activity. There are different types of cravings, such as food cravings or cravings for addictive substances, including alcohol, drugs, or nicotine. Nicotine cravings are common after a person quits smoking and may come and go over time.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  CRC: A type of cell grown in the laboratory from samples of normal cells or cancer cells from patient tissue. These cells can be kept alive for as long as needed and grown to large numbers. The cells are treated with substances that cause them to resemble stem cells (cells from which other types of cells develop) and grow rapidly. Under certain conditions, CRCs can be made to look and act like the original tissue or specific type of tumor from which they came. They are used to study how cancers and other diseases form, and to test new drugs and other types of treatment before they are given to people. Also called conditionally reprogrammed cell.
  creatine: (KREE-uh-teen)
    Pronunciation of dictionary term "creatine"
    A substance that is made by the body and used to store energy. It is being studied in the treatment of weight loss related to cancer. It is derived from the amino acid arginine.
  creatinine: (kree-A-tih-neen)
    Pronunciation of dictionary term "creatinine"
    A compound that is excreted from the body in urine. Creatinine levels are measured to monitor kidney function.
  Crestor: (KREH-stor)
    Pronunciation of dictionary term "Crestor"
    A drug used to lower the amount of cholesterol and other harmful substances, such as triglycerides, in the blood. It is also being studied in the prevention and treatment of some types of cancer and other conditions. Crestor blocks an enzyme that helps make cholesterol in the body and it helps break down cholesterol. It also may cause cancer cells to die and may inhibit the growth of blood vessels that cancer cells need to grow. It is a type of HMG-CoA reductase inhibitor and a type of statin. Also called rosuvastatin calcium.
  crib death: (krib deth)
    Pronunciation of dictionary term "crib death"
    A disorder marked by the sudden and unexpected death of a healthy child who is younger than one year old, usually during sleep. The cause of crib death is not known. Also called SIDS and sudden infant death syndrome.
  cribriform: (KRIH-brih-form)
    Pronunciation of dictionary term "cribriform"
    Pierced with small holes as in a sieve. Refers to the appearance of a tumor when viewed under a microscope. The tumor appears to have open spaces or small holes inside.
  crisis intervention: (KRY-sis IN-ter-VEN-shun)
    Pronunciation of dictionary term "crisis intervention"
    Immediate, short-term counseling (talking with a professional counselor) to stop a critical emotional incident (e.g., attempted suicide or drug overdose) from getting worse. Crisis intervention is not meant to solve the problem that led up to the crisis.
  crisnatol mesylate: (KRIS-nuh-tol MEH-zih-layt)
    Pronunciation of dictionary term "crisnatol mesylate"
    An anticancer drug that interferes with the DNA in cancer cells.
  CRISPR-Cas9: A laboratory tool used to change or “edit” pieces of a cell’s DNA. CRISPR-Cas9 uses a specially designed RNA molecule to guide an enzyme called Cas9 to a specific sequence of DNA. Cas9 then cuts the strands of DNA at that point and removes a small piece, causing a gap in the DNA where a new piece of DNA can be added. CRISPR-Cas9 is a breakthrough in science that will have important uses in many kinds of research. In cancer research, it may help to understand how cancer forms and responds to treatment as well as new ways to diagnose, treat, and prevent it.
  crizotinib: (krih-ZOH-tih-nib)
    Pronunciation of dictionary term "crizotinib"
    A drug used to treat certain types of ALK-positive inflammatory myofibroblastic tumors in adults and children aged 1 year and older, ALK-positive systemic anaplastic large cell lymphoma in young adults and children aged 1 year and older, and ALK-positive or ROS1-positive non-small cell lung cancer. It is also being studied in the treatment of other types of cancer. Crizotinib blocks certain proteins made by the ALK and ROS1 genes, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Xalkori.
    More Information
    - Crizotinib (https://www.cancer.gov/about-cancer/treatment/drugs/crizotinib)
  CRO: A company hired by another company or research center to take over certain parts of running a clinical trial. The company may design, manage, and monitor the trial, and analyze the results. Also called Contract Research Organization.
  Crohn disease: (krone dih-ZEEZ)
    Pronunciation of dictionary term "Crohn disease"
    A condition in which the gastrointestinal tract is inflamed over a long period of time. Crohn disease usually affects the small intestine and colon. Symptoms include fever, diarrhea, stomach cramps, vomiting, and weight loss. Crohn disease increases the risk of colorectal cancer and small intestine cancer. It is a type of inflammatory bowel disease (IBD). Also called regional enteritis.
  cross-sectional study: (kros-SEK-shuh-nul STUH-dee)
    Pronunciation of dictionary term "cross-sectional study"
    A type of research study in which a group of people is observed, or certain information is collected, at a single point in time or over a short period of time. For example, a survey may be done to collect information about the total number of people in a group who have or had a certain disease (such as cancer) or risk factor (such as smoking or obesity). In this example, the survey may be able to provide some information about whether there is an association between the smoking (risk factor) and the cancer (disease) but does not prove that they are linked. Results from a cross-sectional study may be used to plan other research studies. A cross-sectional study is a type of observational (epidemiologic) study.
  cross-talk: (KROS-tawk)
    Pronunciation of dictionary term "cross-talk"
    Describes the process inside a cell that occurs when the same signal is shared by two or more signaling pathways. Usually, a signal caused by the binding of a substance to a molecule on or inside a cell is passed from one molecule to another in the same pathway.
  crossover study: (KROS-oh-ver STUH-dee)
    Pronunciation of dictionary term "crossover study"
    A type of clinical trial in which all participants receive the same two or more treatments, but the order in which they receive them depends on the group to which they are randomly assigned. For example, one group is randomly assigned to receive drug A followed by drug B. The other group receives drug B followed by drug A. There is usually a rest period between treatments.
  CRP: A protein that is made by the liver when there is inflammation or tissue damage in the body. CRP levels are usually low or not detectable in the blood of healthy people. A high level of CRP in the blood may be a sign of certain conditions, including cancer, infection, inflammatory bowel disease, rheumatoid arthritis, and lupus. Increased levels of CRP may also signal a high risk of heart attack or stroke. Measuring the level of CRP may be done to help diagnose certain diseases, find out how well treatment is working, or determine a person’s risk of developing heart disease. Also called C-reactive protein.
  CRPC: Prostate cancer that keeps growing even when the amount of testosterone in the body is reduced to very low levels. Many early-stage prostate cancers need normal levels of testosterone to grow, but CRPCs do not. Also called castrate-resistant prostate cancer.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  cruciferous vegetable: (kroo-SIH-feh-rus VEJ-tuh-bul)
    Pronunciation of dictionary term "cruciferous vegetable"
    A member of the family of vegetables that includes broccoli, Brussels sprouts, cabbage, cauliflower, collard greens, kale, and turnips. These vegetables contain substances that may protect against cancer. Also called Brassica vegetable.
    More Information
    - Cruciferous Vegetables and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/cruciferous-vegetables-fact-sheet)
  cryoablation: (KRY-oh-a-BLAY-shun)
    Pronunciation of dictionary term "cryoablation"
    A procedure in which an extremely cold liquid or an instrument called a cryoprobe is used to freeze and destroy abnormal tissue. A cryoprobe is cooled with substances such as liquid nitrogen, liquid nitrous oxide, or compressed argon gas. Cryoablation may be used to treat certain types of cancer and some conditions that may become cancer. Also called cryosurgery and cryotherapy.
    More Information
    - Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery)
    Cryosurgery. An instrument with a nozzle is used to spray liquid nitrogen or liquid carbon dioxide to freeze and destroy abnormal tissue.
    Cryosurgery; drawing shows an instrument with a nozzle held over an abnormal area on the lower arm of a patient. Inset shows a spray of liquid nitrogen or liquid carbon dioxide coming from the nozzle and covering the abnormal lesion. Freezing destroys the lesion.
  cryobanking: (KRY-oh-bank-ing)
    Pronunciation of dictionary term "cryobanking"
    The process of cooling and storing cells, tissues, or organs at very low or freezing temperatures to save them for future use. Also called cryopreservation.
  cryopreservation: (KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "cryopreservation"
    The process of cooling and storing cells, tissues, or organs at very low or freezing temperatures to save them for future use. Also called cryobanking.
  cryosurgery: (KRY-oh-SER-juh-ree)
    Pronunciation of dictionary term "cryosurgery"
    A procedure in which an extremely cold liquid or an instrument called a cryoprobe is used to freeze and destroy abnormal tissue. A cryoprobe is cooled with substances such as liquid nitrogen, liquid nitrous oxide, or compressed argon gas. Cryosurgery may be used to treat certain types of cancer and some conditions that may become cancer. Also called cryoablation and cryotherapy.
    More Information
    - Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery)
    Cryosurgery. An instrument with a nozzle is used to spray liquid nitrogen or liquid carbon dioxide to freeze and destroy abnormal tissue.
    Cryosurgery; drawing shows an instrument with a nozzle held over an abnormal area on the lower arm of a patient. Inset shows a spray of liquid nitrogen or liquid carbon dioxide coming from the nozzle and covering the abnormal lesion. Freezing destroys the lesion.
  cryotherapy: (KRY-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "cryotherapy"
    A procedure in which an extremely cold liquid or an instrument called a cryoprobe is used to freeze and destroy abnormal tissue. A cryoprobe is cooled with substances such as liquid nitrogen, liquid nitrous oxide, or compressed argon gas. Cryotherapy may be used to treat certain types of cancer and some conditions that may become cancer. Also called cryoablation and cryosurgery.
    More Information
    - Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery)
    Cryosurgery. An instrument with a nozzle is used to spray liquid nitrogen or liquid carbon dioxide to freeze and destroy abnormal tissue.
    Cryosurgery; drawing shows an instrument with a nozzle held over an abnormal area on the lower arm of a patient. Inset shows a spray of liquid nitrogen or liquid carbon dioxide coming from the nozzle and covering the abnormal lesion. Freezing destroys the lesion.
  cryptorchidism: (krip-TOR-kih-dih-zum)
    Pronunciation of dictionary term "cryptorchidism"
    A condition in which one or both testicles fail to move from the abdomen, where they develop before birth, into the scrotum. Cryptorchidism may increase the risk for development of testicular cancer. Also called undescended testicles.
  CSF: The fluid that flows in and around the hollow spaces of the brain and spinal cord, and between two of the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). CSF is made by tissue called the choroid plexus in the ventricles (hollow spaces) in the brain. Also called cerebrospinal fluid.
    Cerebrospinal fluid (CSF, shown in blue) is made by tissue that lines the ventricles (hollow spaces) in the brain. It flows in and around the brain and spinal cord to help cushion them from injury and provide nutrients.
    Drawing shows cerebrospinal fluid (CSF) in the brain and spinal cord. Also shown are the ventricles in the brain, where CSF is made.
  CSP: A rare tumor that usually forms in the connective tissue of the breast. CSPs tend to grow quickly and get large, but they rarely spread to other parts of the body. Most are benign (not cancer), but some may be malignant (cancer) or borderline (in between benign and malignant). CSPs are usually removed by surgery, but they can come back. They are most common in women between 40 and 50 years of age. Also called cystosarcoma phyllodes of the breast and phyllodes tumor.
  CSPC: Prostate cancer that needs androgens (male hormones) to grow and therefore stops growing when androgens are not present. Many early-stage prostate cancers are androgen-dependent, so reducing the amount of androgens in the body or blocking their action may be an effective type of therapy. Also called androgen-dependent prostate cancer, androgen-sensitive prostate cancer, castrate-sensitive prostate cancer, hormone-sensitive prostate cancer, and HSPC.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  CSS: The length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, to the date of death from the disease. Patients who die from causes unrelated to the disease are not counted in this measurement. In a clinical trial, measuring the CSS is one way to see how well a new treatment works. Also called cause-specific survival.
  CT angiography: (... an-jee-AH-gruh-fee)
    Pronunciation of dictionary term "CT angiography"
    A procedure that uses x-rays to create a series of detailed pictures of the blood vessels and blood flow inside the body. The pictures are taken from different angles and are created by a computer linked to an x-ray machine. A dye is injected into a vein to make the blood vessels and blood flow easier to see on the x-ray. CT angiography may be used to check for aneurysms (a bulge in the blood vessel wall), blockages in the arteries, blood clots, and other blood vessel problems. Also called computed tomography angiography and CTA.
  CT colonography: (... KOH-luh-NAH-gruh-fee)
    Pronunciation of dictionary term "CT colonography"
    A method to examine the inside of the colon by taking a series of x-rays. A computer is used to make 2-dimensional (2-D) and 3-D pictures of the colon from these x-rays. The pictures can be saved, changed to give better viewing angles, and reviewed after the procedure, even years later. Also called computed tomographic colonography, computed tomography colonography, and virtual colonoscopy.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  CT scan: (… skan)
    Pronunciation of dictionary term "CT scan"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-dimensional (3-D) views of tissues and organs. A dye may be injected into a vein or swallowed to help the tissues and organs show up more clearly. A CT scan may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called CAT scan, computed tomography scan, computerized axial tomography scan, and computerized tomography.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
    Computed tomography (CT) scan of the abdomen. The patient lies on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
    Computed tomography (CT) scan of the abdomen; drawing shows the patient on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
  CT-2103: A form of the anticancer drug paclitaxel combined with a protein called poliglumex that may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of breast cancer, ovarian cancer, lung cancer, and other types of cancer. It belongs to the family of drugs called mitotic inhibitors. Also called paclitaxel poliglumex, paclitaxel polyglutamate, and Xyotax.
  CT-2106: A form of the anticancer drug camptothecin that may have fewer side effects and work better than camptothecin. It is being studied in the treatment of cancer. It is a type of DNA topoisomerase inhibitor. Also called polyglutamate camptothecin.
  CT-2584: A substance that is being studied in the treatment of cancer. It may prevent the growth of blood vessels from surrounding tissue into a solid tumor.
  CT-322: A substance being studied in the treatment of cancer. CT-322 may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of vascular endothelial growth factor receptor-2 (VEGFR-2) inhibitor and a type of antiangiogenesis agent. Also called Angiocept and VEGFR-2 inhibitor CT-322.
  CT-guided biopsy: (… GY-ded BY-op-see)
    Pronunciation of dictionary term "CT-guided biopsy"
    A biopsy procedure that uses a CT scan (a special type of x-ray linked to a computer) to find an abnormal area in the body and help guide the removal of a sample of tissue from that area. A needle is usually used to remove the sample, which is then checked under a microscope for signs of disease. A CT-guided biopsy may be done when the abnormal area is deep inside the body or when the doctor cannot feel a lump or mass.
  CT53518: A substance being studied in the treatment of some types of cancer. It may stop cancer cell growth by blocking certain enzymes. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called MLN518 and tandutinib.
  CTA: A procedure that uses x-rays to create a series of detailed pictures of the blood vessels and blood flow inside the body. The pictures are taken from different angles and are created by a computer linked to an x-ray machine. A dye is injected into a vein to make the blood vessels and blood flow easier to see on the x-ray. CTA may be used to check for aneurysms (a bulge in the blood vessel wall), blockages in the arteries, blood clots, and other blood vessel problems. Also called computed tomography angiography and CT angiography.
  CTC: A cancer cell that breaks away from the original (primary) tumor and enters the bloodstream. CTCs can travel through the blood and form new tumors in other parts of the body. A sample of blood can be used to detect CTCs and learn more about the primary tumor. CTCs are being used as a biomarker in some types of cancer to help plan treatment or make a likely prognosis. Also called circulating tumor cell.
  CTC1 gene: (… jeen)
    Pronunciation of dictionary term "CTC1 gene"
    A gene that makes a protein involved in protecting and maintaining telomeres (the ends of chromosomes) and in copying DNA. Mutations (changes) in the CTC1 gene may cause damage to chromosomes and DNA, which may lead to abnormal cell growth. CTC1 gene mutations have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
    More Information
    - CTC1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/ctc1/)
  ctDNA: Small pieces of DNA that are released into a person’s blood by tumor cells as they die. A sample of blood can be used to look for and measure the amount of ctDNA and identify specific mutations (changes) in the DNA. ctDNA is being used as a biomarker to help diagnose some types of cancer, to help plan treatment, or to find out how well treatment is working or if cancer has come back. Also called circulating tumor DNA.
  CTLA-4: A protein found on T cells (a type of immune cell) that helps keep the body’s immune responses in check. When CTLA-4 is bound to another protein called B7, it helps keep T cells from killing other cells, including cancer cells. Some anticancer drugs, called immune checkpoint inhibitors, are used to block CTLA-4. When this protein is blocked, the “brakes” on the immune system are released and the ability of T cells to kill cancer cells is increased.
    Immune checkpoint inhibitor. Checkpoint proteins, such as B7-1/B7-2 on antigen-presenting cells (APC) and CTLA-4 on T cells, help keep the body’s immune responses in check. When the T-cell receptor (TCR) binds to antigen and major histocompatibility complex (MHC) proteins on the APC and CD28 binds to B7-1/B7-2 on the APC, the T cell can be activated. However, the binding of B7-1/B7-2 to CTLA-4 keeps the T cells in the inactive state so they are not able to kill tumor cells in the body (left panel). Blocking the binding of B7-1/B7-2 to CTLA-4 with an immune checkpoint inhibitor (anti-CTLA-4 antibody) allows the T cells to be active and to kill tumor cells (right panel).
    Immune checkpoint inhibitor; the panel on the left shows the binding of the T-cell receptor (TCR) to antigen and MHC proteins on the antigen-presenting cell (APC) and the binding of CD28 on the T cell to B7-1/B7-2 on the APC. It also shows the binding of B7-1/B7-2 to CTLA-4 on the T cell, which keeps the T cells in the inactive state. The panel on the right shows immune checkpoint inhibitor (anti-CTLA antibody) blocking the binding of B7-1/B7-2 to CTLA-4, which allows the T cells to be active and to kill tumor cells.
  CTX: A drug used to treat many types of cancer and a certain type of kidney disease in children. CTX damages the cell’s DNA and may kill cancer cells. It may also lower the body’s immune response. CTX is a type of alkylating agent. Also called cyclophosphamide.
    More Information
    - Cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
  CTX: A substance being studied in the diagnosis and treatment of glioma (a type of brain cancer) and other types of cancer. It binds to cancer cells in the brain and peripheral nervous system and may keep them from spreading. CTX comes from the venom of a type of scorpion. A form of CTX made in the laboratory is called TM-601. CTX is a type of neurotoxin. Also called chlorotoxin.
  cubic centimeter: (KYOO-bik SEN-tih-MEE-ter)
    Pronunciation of dictionary term "cubic centimeter"
    A measure of volume in the metric system. One thousand cubic centimeters equal one liter. Also called cc, milliliter, and mL.
  Cubicin: (KYOO-bih-sin)
    Pronunciation of dictionary term "Cubicin"
    A drug used to treat certain bacterial skin and bloodstream infections in adults. Cubicin is also being studied in the treatment of fever and neutropenia (an abnormal decrease in the number of neutrophils, a type of white blood cell) in patients with cancer. It is a type of antibiotic. Also called daptomycin.
  cultural competency: (KUL-cher-ul KOM-peh-ten-see)
    Pronunciation of dictionary term "cultural competency"
    The ability to understand, interact, and work well with people of different cultures. In medicine, one goal of cultural competency is to help make sure that the quality of health care is equal among different cultural groups.
  culture: (KUL-cher)
    Pronunciation of dictionary term "culture"
    The beliefs, values, and behaviors that are shared within a group, such as a religious group or a nation. Culture includes language, customs, and beliefs about roles and relationships. In medicine, culture also refers to the growth of microorganisms, such as bacteria and yeast, or human, plant, or animal cells or tissue in the laboratory.
  cultured cell: (KUL-cherd sel)
    Pronunciation of dictionary term "cultured cell"
    A human, plant, or animal cell that has been adapted to grow in the laboratory. Cultured cells may be used to diagnose infections, to test new drugs, and in research.
  cultured cell line: (KUL-cherd sel line)
    Pronunciation of dictionary term "cultured cell line"
    Cells of a single type (human, animal, or plant) that have been adapted to grow continuously in the laboratory and are used in research.
  Culturelle: (KUL-cher-EL)
    Pronunciation of dictionary term "Culturelle"
    A live form of a bacterium that makes lactic acid (a substance that is made from sugars found in milk and is also made in the body). Culturelle is given to help with digestion and normal bowel function. It may also help keep the gastrointestinal (GI) tract healthy. It is being studied in the prevention of infections in patients having donor stem cell transplants and in other conditions. Also called Lactobacillus rhamnosus GG.
  cumulative dose: (KYOO-myuh-luh-tiv dose)
    Pronunciation of dictionary term "cumulative dose"
    In medicine, the total amount of a drug or radiation given to a patient over time; for example, the total dose of radiation given in a series of radiation treatments.
  cumulative exposure: (KYOO-myuh-luh-tiv ek-SPOH-zher)
    Pronunciation of dictionary term "cumulative exposure"
    The total amount of a substance or radiation that a person is exposed to over time. Cumulative exposure to a harmful substance or radiation may increase the risk of certain diseases or conditions.
  cumulative risk: (KYOO-myuh-luh-tiv risk)
    Pronunciation of dictionary term "cumulative risk"
    A measure of the total risk that a certain event will happen during a given period of time. In cancer research, it is the likelihood that a person who is free of a certain type of cancer will develop that cancer by a specific age. For example, a woman with no known risk factors for breast cancer has a cumulative risk of getting breast cancer over a lifetime of 90 years of about 12-13%. This means one out of every eight women will get breast cancer by age 90 years.
  CUP: A case in which cancer cells are found in the body, but the place where the cells first started growing (the origin or primary site) cannot be determined. Also called cancer of unknown primary origin and carcinoma of unknown primary.
    More Information
    - Carcinoma of Unknown Primary (https://www.cancer.gov/types/unknown-primary)
    In cancer of unknown primary, cancer cells have spread in the body but the place where the primary cancer began is not known.
    Cancer of unknown primary; drawing shows a primary tumor that has spread from an unknown site to other parts of the body (the lung and the brain). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph systems, to another part of the body where a metastatic tumor has formed.
  cupping: (KUP-ping)
    Pronunciation of dictionary term "cupping"
    A procedure in which a rounded glass cup is warmed and placed upside down over an area of the body, creating suction that holds the cup to the skin. Cupping increases the flow of blood. In traditional Chinese medicine, it is also thought to increase the flow of qi (vital energy).
  curative surgery: (KYOOR-uh-tiv SER-juh-ree)
    Pronunciation of dictionary term "curative surgery"
    Surgery to remove all malignant (cancerous) tissue, which is meant to cure the disease. This includes removing part or all of the cancerous organ or tissue and a small amount of healthy tissue around it. Nearby lymph nodes may also be removed. Curative surgery works best for localized cancer. Chemotherapy or radiation therapy may be given before surgery to shrink the tumor or after surgery to kill any cancer cells that remain.
  curative therapy: (KYOOR-uh-tiv THAYR-uh-pee)
    Pronunciation of dictionary term "curative therapy"
    Treatment that is meant to cure an illness or disease with the goal of a full recovery that includes an acceptable quality of life. For cancer, a curative therapy approach depends on the cancer type and stage.
  curcumin: (ker-KYOO-min)
    Pronunciation of dictionary term "curcumin"
    A natural substance that comes from the underground stem of an East Indian plant called turmeric, or Curcuma longa, and gives turmeric its yellow color. The turmeric plant has been used for many years in traditional Asian medicine to treat certain conditions. Curcumin, which is found in turmeric, may have antioxidant and anti-inflammatory effects in the body. It is being studied in the prevention and treatment of some types of cancer.
    More Information
    - Curcumin (Curcuma, Turmeric) and Cancer
  cure: (kyoor)
    Pronunciation of dictionary term "cure"
    To heal or restore health; a treatment to restore health.
  curettage: (kyoo-reh-TAZH)
    Pronunciation of dictionary term "curettage"
    Removal of tissue with a curette (a spoon-shaped instrument with a sharp edge).
  curette: (kyoo-RET)
    Pronunciation of dictionary term "curette"
    A spoon-shaped instrument with a sharp edge.
  Cushing disease: (KUSH-ing dih-ZEEZ)
    Pronunciation of dictionary term "Cushing disease"
    A condition in which there is too much cortisol (a hormone made by the outer layer of the adrenal gland) in the body. In Cushing disease, this happens when an adenoma (benign tumor) in the pituitary gland makes too much adrenocorticotropic hormone (ACTH). This causes the adrenal gland to make too much cortisol. Symptoms include a round face, thin arms and legs, severe fatigue and muscle weakness, high blood pressure and high blood sugar, purple or pink stretch marks on the skin, and weight gain, especially in the abdomen.
  Cushing syndrome: (KUSH-ing SIN-drome)
    Pronunciation of dictionary term "Cushing syndrome"
    A condition in which there is too much cortisol (a hormone made by the outer layer of the adrenal gland) in the body. Cushing syndrome may be caused by taking too many steroid drugs or by certain types of tumors. Tumors that make adrenocorticotropic hormone (ACTH) cause the adrenal gland to make too much cortisol. Symptoms of Cushing syndrome include a round face, thin arms and legs, severe fatigue and muscle weakness, high blood pressure, high blood sugar, purple or pink stretch marks on the skin, and weight gain, especially in the abdomen. Also called hypercortisolism.
  custirsen sodium: (KUS-tir-sen SOH-dee-um)
    Pronunciation of dictionary term "custirsen sodium"
    A substance being studied in the treatment of cancer. It blocks the production of a protein called clusterin, which helps cells live longer. This may kill cancer cells that need clusterin to grow. It may also make cells more sensitive to anticancer drugs. It is a type of antisense oligonucleotide, and a type of chemosensitizing agent. Also called OGX-011.
  cut point: In medicine, the test result values used to categorize certain types of laboratory findings as normal or abnormal. Values above or below the cut point may be used to help doctors determine the presence or risk of certain diseases or conditions, such as obesity, diabetes, or high cholesterol.
  cutaneous: (kyoo-TAY-nee-us)
    Pronunciation of dictionary term "cutaneous"
    Having to do with the skin.
  cutaneous breast cancer: (kyoo-TAY-nee-us brest KAN-ser)
    Pronunciation of dictionary term "cutaneous breast cancer"
    Cancer that has spread from the breast to the skin.
  cutaneous HPV: (kyoo-TAY-nee us …)
    Pronunciation of dictionary term "cutaneous HPV"
    A group of human papillomaviruses (HPV) that infect the cells on the surface of the skin and cause skin warts, usually on the hands and feet. These are considered common warts and are not transmitted sexually. Cutaneous HPV infections usually spread by casual skin-to-skin contact with an infected person or by sharing an item, such as a towel, with that person. Cutaneous HPVs do not cause genital warts or cancer. Also called cutaneous human papillomavirus.
  cutaneous human papillomavirus: (kyoo-TAY-nee us HYOO-mun PA-pih-LOH-muh-VY-rus)
    Pronunciation of dictionary term "cutaneous human papillomavirus"
    A group of human papillomaviruses (HPV) that infect the cells on the surface of the skin and cause skin warts, usually on the hands and feet. These are considered common warts and are not transmitted sexually. Cutaneous human papillomavirus infections usually spread by casual skin-to-skin contact with an infected person or by sharing an item, such as a towel, with that person. Cutaneous human papillomaviruses do not cause genital warts or cancer. Also called cutaneous HPV.
  cutaneous leiomyoma: (kyoo-TAY-nee-us LY-oh-my-OH-muh)
    Pronunciation of dictionary term "cutaneous leiomyoma"
    A benign (not cancer) tumor that forms in the muscle tissue around a hair follicle (the opening on the skin through which hair grows). Cutaneous leiomyomas appear as small bumps that may be the same color as, or darker than, the nearby skin. They usually occur on the arms, legs, chest, and abdomen. Cutaneous leiomyomas tend to increase in size and number over time and can be painful to the touch or in cold temperatures. They often occur in patients with an inherited condition called hereditary leiomyomatosis and renal cell cancer.
    Cutaneous leiomyomas are benign (not cancer) tumors that form in the muscle tissue around a hair follicle. Here they are shown on the thigh.
    Photograph of many small, red bumps on an individual’s thigh.
    Cutaneous leiomyomas are benign (not cancer) tumors that form in the muscle tissue around a hair follicle. Here they are shown on the chest.
    Photograph of small, pink bumps on an individual’s chest.
    Cutaneous leiomyomas are benign tumors that arise from smooth muscle tissue in a hair follicle, forming a papule. Here they are shown on the thigh.
    Photograph of many small, red papules on an individual’s thigh.
    Cutaneous leiomyomas are benign tumors that arise from smooth muscle tissue in a hair follicle, forming a papule. Here they are shown on the chest.
    Photograph of small, pink papules on an individual’s chest.
  cutaneous lichen amyloidosis: (kyoo-TAY-nee-us LY-ken A-muh-loy-DOH-sis)
    Pronunciation of dictionary term "cutaneous lichen amyloidosis"
    A chronic condition marked by the presence of itchy, reddish-brown, scaly, raised bumps on the skin. Over time, the bumps can form thick, hard patches on the skin. They usually occur on the shins but can also occur on the thighs, feet, neck, back, and lower part of the arm. These bumps are a result of a buildup of abnormal proteins in the skin. The cause of cutaneous lichen amyloidosis is usually not known. Sometimes it is found in people with a rare genetic condition called multiple endocrine neoplasia type 2A (MEN2A) and in people with mutations (changes) in certain genes. Cutaneous lichen amyloidosis most often occurs in middle adulthood and is more common in men and in people with darker skin.
    Cutaneous lichen amyloidosis is a condition in which itchy papules that are brownish-red in color typically appear on the shins, thighs, feet, or neck, as shown here.
    Photograph of the neck and upper back of an individual whose skin is covered with many small bumps that are brownish-red in color.
    Cutaneous lichen amyloidosis is a condition in which itchy papules that are brownish-red in color typically appear on the shins, thighs, feet, or neck, as shown here.
    Photograph of the neck and upper back of an individual whose skin is covered with many small bumps that are brownish-red in color.
  cutaneous squamous cell carcinoma: (kyoo-TAY-nee-us SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "cutaneous squamous cell carcinoma"
    Cancer that begins in cells that form the epidermis (outer layer of the skin). It usually occurs on areas of the skin that have been exposed to natural sunlight or artificial sunlight (such as from tanning beds) over long periods of time. These areas include the face, ears, lower lip, neck, arms, or back of the hands. It may also occur on areas of the skin that have been burned or exposed to chemicals or radiation. Cutaneous squamous cell carcinoma may appear as a firm red bump, a scaly red patch, an open sore, or a wart that may crust or bleed easily. Cutaneous squamous cell carcinoma that has not spread can usually be cured. Also called squamous cell carcinoma of the skin and squamous cell skin cancer.
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  cutaneous T-cell lymphoma: (kyoo-TAY-nee-us … lim-FOH-muh)
    Pronunciation of dictionary term "cutaneous T-cell lymphoma"
    A type of cancer that begins in T cells (a type of white blood cell) and affects the skin. There are several different types of cutaneous T-cell lymphomas. Most are marked by an itchy, scaly, red rash that can thicken or form tumors on the skin, or by skin redness all over the body. The lymph nodes may also be swollen. Cutaneous T-cell lymphomas usually grow slowly, but some may grow quickly and spread to the lymph nodes or to other organs, such as the spleen or liver. They usually occur in middle-aged or older men. The most common types of cutaneous T-cell lymphoma are mycosis fungoides and Sézary syndrome. Cutaneous T-cell lymphoma is a type of non-Hodgkin lymphoma.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  CVA: In medicine, a loss of blood flow to part of the brain, which damages brain tissue. CVAs are caused by blood clots and broken blood vessels in the brain. Symptoms include dizziness, numbness, weakness on one side of the body, and problems with talking, writing, or understanding language. The risk of CVA is increased by high blood pressure, older age, smoking, diabetes, high cholesterol, heart disease, atherosclerosis (a buildup of fatty material and plaque inside the coronary arteries), and a family history of CVA. Also called cerebrovascular accident and stroke.
  CVP: An abbreviation for a chemotherapy combination used to treat slow-growing forms of non-Hodgkin lymphoma (NHL) and chronic lymphocytic leukemia (CLL). It includes the drugs cyclophosphamide, vincristine sulfate, and prednisone. Also called CVP regimen.
    More Information
    - CVP (https://www.cancer.gov/about-cancer/treatment/drugs/CVP)
  CVP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "CVP regimen"
    An abbreviation for a chemotherapy combination used to treat slow-growing forms of non-Hodgkin lymphoma (NHL) and chronic lymphocytic leukemia (CLL). It includes the drugs cyclophosphamide, vincristine sulfate, and prednisone. Also called CVP.
    More Information
    - CVP (https://www.cancer.gov/about-cancer/treatment/drugs/CVP)
  cyanocobalamin: (SY-uh-NOH-koh-BA-luh-min)
    Pronunciation of dictionary term "cyanocobalamin"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Cyanocobalamin helps make red blood cells, DNA, RNA, energy, and tissues, and keeps nerve cells healthy. It is found in liver, meat, eggs, poultry, shellfish, milk, and milk products. Cyanocobalamin is water-soluble (can dissolve in water) and must be taken in every day. Not enough cyanocobalamin can cause certain types of anemia (a condition in which the number of red blood cells is below normal) and neurologic disorders. It is being studied with folate in the prevention and treatment of some types of cancer. Also called cobalamin and vitamin B12.
    More Information
    - Cancer Prevention Overview
  cyanogenic glucoside: (SY-uh-noh-JEH-nik GLOO-koh-side)
    Pronunciation of dictionary term "cyanogenic glucoside"
    A plant compound that contains sugar and produces cyanide.
  cyanosis: (SY-uh-NOH-sis)
    Pronunciation of dictionary term "cyanosis"
    Blue-colored skin caused by too little oxygen in the blood.
  CYC116: A substance being studied in the treatment of some types of cancer. It blocks certain enzymes involved in cell division and may kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of protein kinase inhibitor and a type of antiangiogenesis agent.
  cycle of treatment: (SY-kul … TREET-ment)
    Pronunciation of dictionary term "cycle of treatment"
    A period of treatment followed by a period of rest (no treatment) that is repeated on a regular schedule. For example, treatment given for one week followed by three weeks of rest is one cycle of treatment. When this cycle is repeated multiple times on a regular schedule, it makes up a course of treatment. Also called treatment cycle.
  cyclic neutropenia: (SY-klik noo-troh-PEE-nee-uh)
    Pronunciation of dictionary term "cyclic neutropenia"
    A chronic condition that affects neutrophils (a type of white blood cell). In cyclic neutropenia, the number of neutrophils in the blood goes in cycles from normal to low and back to normal again. Symptoms include fever, inflamed mucous membranes in the mouth, and infections. Also called periodic neutropenia.
  cyclin-D1: (SY-klin …)
    Pronunciation of dictionary term "cyclin-D1"
    A protein that helps control cell division. It is found in higher than normal amounts in several types of cancer cells. Measuring the amount of cyclin-D1 in blood cells may help to diagnose cancer or plan cancer treatment. Cyclin-D1 is a cell cycle protein and a type of tumor marker.
  cyclooxygenase inhibitor: (SY-kloh-OK-sih-jeh-NAYS in-HIH-bih-ter)
    Pronunciation of dictionary term "cyclooxygenase inhibitor"
    COX inhibitor. A type of drug that is used to treat inflammation and pain, and is being studied in the prevention and treatment of cancer. Cyclo-oxygenase inhibitors belong to the family of drugs called nonsteroidal anti-inflammatory drugs (NSAIDs). Also called COX inhibitor.
  cyclooxygenase-2: (SY-kloh-OK-sih-jeh-NAYS-2)
    Pronunciation of dictionary term "cyclooxygenase-2"
    An enzyme that speeds up the formation of substances that cause inflammation and pain. It may also cause tumor cells to grow. Some tumors have high levels of cyclooxygenase-2 and blocking its activity may reduce tumor growth. Also called COX-2 and prostaglandin-endoperoxide synthase 2.
  cyclooxygenase-2 inhibitor: (SY-kloh-OK-sih-jeh-NAYS-2 in-HIH-bih-ter)
    Pronunciation of dictionary term "cyclooxygenase-2 inhibitor"
    A nonsteroidal anti-inflammatory drug used to relieve pain and inflammation. Cyclooxygenase-2 inhibitors are being studied in the prevention of colon polyps, and as anticancer drugs. Also called COX-2 inhibitor.
  cyclophosphamide: (SY-kloh-FOS-fuh-mide)
    Pronunciation of dictionary term "cyclophosphamide"
    A drug used to treat many types of cancer and a certain type of kidney disease in children. Cyclophosphamide damages the cell’s DNA and may kill cancer cells. It may also lower the body’s immune response. Cyclophosphamide is a type of alkylating agent. Also called CTX.
    More Information
    - Cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
  cyclosporine: (SY-kloh-SPOR-een)
    Pronunciation of dictionary term "cyclosporine"
    A drug used to help reduce the risk of rejection of organ and bone marrow transplants by the body. It is also used in clinical trials to make cancer cells more sensitive to anticancer drugs.
  CYLD gene: (… jeen)
    Pronunciation of dictionary term "CYLD gene"
    A gene that makes a protein involved in controlling cell growth, cell division, and a type of cell death called apoptosis. Mutations (changes) in the CYLD gene may cause cells to grow and divide too quickly or in an uncontrolled way. This may cause abnormal cells, including cancer cells, to grow. CYLD gene mutations have been found in an inherited condition called Brooke-Spiegler syndrome and in some types of cancer, including multiple myeloma and cancers of the kidney, liver, uterus, and colon. The CYLD gene is a type of tumor suppressor gene.
    More Information
    - CYLD gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/cyld/)
  Cymbalta: (sim-BAL-tuh)
    Pronunciation of dictionary term "Cymbalta"
    A drug used to treat depression and peripheral neuropathy (pain, numbness, tingling, burning, or weakness in the hands or feet) that can occur with diabetes. It is also being studied in the treatment of peripheral neuropathy caused by certain anticancer drugs. Cymbalta increases the amount of certain chemicals in the brain that help relieve depression and pain. It is a type of serotonin and norepinephrine reuptake inhibitor. Also called duloxetine hydrochloride.
  cyproheptadine: (SY-proh-HEP-tuh-deen)
    Pronunciation of dictionary term "cyproheptadine"
    A drug that is used to treat asthma, allergies, and colds, and to relieve itching caused by certain skin disorders. It has also been used to stimulate appetite and weight gain, and is being studied in the treatment of weight loss caused by cancer and its treatment. Cyproheptadine belongs to the family of drugs called antihistamines.
  cyproterone acetate: (sy-PROH-teh-rone A-seh-tayt)
    Pronunciation of dictionary term "cyproterone acetate"
    A synthetic hormone being studied for treatment of hot flashes in men with prostate cancer who have had both testicles removed by surgery.
  Cyramza: (sy-RAM-zuh)
    Pronunciation of dictionary term "Cyramza"
    A drug that binds to the protein vascular endothelial growth factor (VEGF) to help keep new blood vessels from forming and is used to treat different types of cancer. It is used alone or with other drugs to treat certain types of non-small cell lung cancer, hepatocellular carcinoma (a type of liver cancer), colorectal cancer, stomach cancer, and gastroesophageal junction cancer. It is also being studied in the treatment of other types of cancer. Cyramza may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody. Also called anti-VEGFR-2 fully human monoclonal antibody IMC-1121B, IMC-1121B, and ramucirumab.
    More Information
    - Ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
  cyst: (sist)
    Pronunciation of dictionary term "cyst"
    A closed, sac-like pocket of tissue that can form anywhere in the body. It may be filled with fluid, air, pus, or other material. Most cysts are benign (not cancer).
  cystectomy: (sis-TEK-toh-mee)
    Pronunciation of dictionary term "cystectomy"
    Surgery to remove all or part of the bladder (the organ that holds urine) or to remove a cyst (a sac or capsule in the body).
  cystic duct: (SIS-tik dukt)
    Pronunciation of dictionary term "cystic duct"
    A tube that carries bile from the gall bladder. It joins the common hepatic duct to form the common bile duct. It is part of the biliary duct system.
    Anatomy of the gallbladder. The gallbladder is just below the liver. Bile is stored in the gallbladder and flows through the cystic duct and the common bile duct into the small intestine when food is being digested.
    Anatomy of the gallbladder; shows the liver, common hepatic duct, cystic duct, common bile duct, pancreas, and small intestine. The inset shows the liver, bile ducts, gallbladder, pancreas, and small intestine.
  cystic fibrosis: (SIS-tik fy-BROH-sis)
    Pronunciation of dictionary term "cystic fibrosis"
    A common hereditary disease in which exocrine (secretory) glands produce abnormally thick mucus. This mucus can cause problems in digestion, breathing, and body cooling.
  cystic nephroma: (SIS-tik neh-FROH-muh)
    Pronunciation of dictionary term "cystic nephroma"
    A rare, benign (not cancer) kidney tumor made up of fluid-filled cysts. Cystic nephroma can occur in one or both kidneys. Signs and symptoms may include pain in the abdomen or back, a lump in the abdomen, blood in the urine, urinary tract infection, anemia, and fever. Cystic nephroma usually occurs in young children or middle-aged adults. Cystic nephroma may also be found in patients who have pleuropulmonary blastoma (a rare, fast-growing cancer that forms in the tissues of the lung and chest cavity). Some patients with cystic nephroma have a mutation (change) in a gene called DICER1.
  cystitis: (sis-TY-tis)
    Pronunciation of dictionary term "cystitis"
    Inflammation of the lining of the bladder. Symptoms include pain and a burning feeling while urinating, blood in the urine, dark or cloudy urine, feeling a need to urinate often or right away, being unable to control the flow of urine, and pain in the pelvis or lower back. Cystitis is most often caused by an infection, but it may also be caused by taking certain medicines (such as anticancer drugs), radiation therapy to the pelvis, being exposed to chemicals (such as perfumes or dyes), or having a catheter in the bladder for a long time. It may also be caused by other conditions, such as diabetes, kidney stones, an enlarged prostate, or a spinal cord injury.
  cystoprostatectomy: (SIS-toh-pros-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "cystoprostatectomy"
    Surgery to remove the bladder and the prostate. The seminal vesicles and nearby lymph nodes may also be removed. The prostate and seminal vesicles are glands in the male reproductive system that help make semen. Also called prostatocystectomy.
  cystosarcoma phyllodes of the breast: (SIS-toh-sar-KOH-muh fih-LOH-deez … brest)
    Pronunciation of dictionary term "cystosarcoma phyllodes of the breast"
    A rare tumor that usually forms in the connective tissue of the breast. Cystosarcoma phyllodes of the breasts tend to grow quickly and get large, but they rarely spread to other parts of the body. Most are benign (not cancer), but some may be malignant (cancer) or borderline (in between benign and malignant). Cystosarcoma phyllodes of the breasts are usually removed by surgery, but they can come back. They are most common in women between 40 and 50 years of age. Also called CSP and phyllodes tumor.
  cystoscope: (SIS-toh-SKOPE)
    Pronunciation of dictionary term "cystoscope"
    A thin, tube-like instrument used to look inside the bladder and urethra. A cystoscope has a light and a lens for viewing and may have a tool to remove tissue.
    Cystoscopy. A cystoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted through the urethra into the bladder. Fluid is used to fill the bladder. The doctor looks at an image of the inner wall of the bladder on a computer monitor to check for abnormal areas.
    Cystoscopy; drawing shows a side view of the lower pelvis containing the bladder, uterus, vagina, rectum, and anus. A cystoscope (a thin, tube-like instrument with a light and a lens for viewing) is shown passing through the urethra and into the bladder. Fluid is used to fill the bladder. An inset shows a woman lying on an examination table with her knees bent and legs apart. She is covered by a drape. The doctor is looking at an image of the inner wall of the bladder on a computer monitor to check for abnormal areas.
  cystoscopy: (sis-TOS-koh-pee)
    Pronunciation of dictionary term "cystoscopy"
    Examination of the bladder and urethra using a cystoscope, inserted into the urethra. A cystoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
    Cystoscopy. A cystoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted through the urethra into the bladder. Fluid is used to fill the bladder. The doctor looks at an image of the inner wall of the bladder on a computer monitor to check for abnormal areas.
    Cystoscopy; drawing shows a side view of the lower pelvis containing the bladder, uterus, vagina, rectum, and anus. A cystoscope (a thin, tube-like instrument with a light and a lens for viewing) is shown passing through the urethra and into the bladder. Fluid is used to fill the bladder. An inset shows a woman lying on an examination table with her knees bent and legs apart. She is covered by a drape. The doctor is looking at an image of the inner wall of the bladder on a computer monitor to check for abnormal areas.
  cystourethrectomy: (SIS-toh-yoo-ree-THREK-toh-mee)
    Pronunciation of dictionary term "cystourethrectomy"
    Surgery to remove the bladder (the organ that holds urine) and urethra (the tube through which urine leaves the body).
  cytarabine: (sy-TAYR-uh-been)
    Pronunciation of dictionary term "cytarabine"
    A drug used with other drugs to treat adults and children with acute myeloid leukemia and to prevent and treat a type of leukemia that has spread to the meninges (the tissue that covers and protects the brain and spinal cord). It may also be used to treat acute lymphoblastic leukemia and blastic phase chronic myelogenous leukemia. It is also being studied in the treatment of other types of cancer. Cytarabine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called ARA-C.
    More Information
    - Cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
  cytarabine liposome: (sy-TAYR-uh-been LY-poh-some)
    Pronunciation of dictionary term "cytarabine liposome"
    A form of the anticancer drug cytarabine that is contained inside very tiny, fat-like particles. It may have fewer side effects and work better than cytarabine. It is used to treat lymphoma that has spread to the meninges (three thin layers of tissue that cover and protect the brain and spinal cord). It is also being studied in the treatment of other types of cancer. It is a type of antimetabolite. Also called Depo-Cyt and liposomal cytarabine.
    More Information
    - Cytarabine Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabineliposome)
  cytochlor: (SY-toh-klor)
    Pronunciation of dictionary term "cytochlor"
    A substance being studied in the treatment of cancer that has spread to the brain. It has also been studied in the treatment of other types of cancer. Cytochlor damages the DNA in cancer cells, which may make them easier to kill with radiation therapy. It is a type of radiosensitizing agent.
  cytochrome P450 enzyme system: (SY-tuh-krome ... EN-zime SIS-tem)
    Pronunciation of dictionary term "cytochrome P450 enzyme system"
    A group of enzymes involved in drug metabolism and found in high levels in the liver. These enzymes change many drugs, including anticancer drugs, into less toxic forms that are easier for the body to excrete.
  cytogenetic analysis: (SY-toh-jeh-NEH-tik uh-NA-lih-sis)
    Pronunciation of dictionary term "cytogenetic analysis"
    The process of analyzing cells in a sample of tissue, blood, bone marrow, or amniotic fluid to look for changes in chromosomes, including broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of a genetic disease or condition or some types of cancer. Cytogenetic analysis may be used to help diagnose disease, plan treatment, or find out how well treatment is working.
    More Information
    - Cytogenetics (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Cytogenetics)
  cytogenetics: (SY-toh-jeh-NEH-tix)
    Pronunciation of dictionary term "cytogenetics"
    The study of chromosomes, which are long strands of DNA and protein that contain most of the genetic information in a cell. Cytogenetics involves testing samples of tissue, blood, or bone marrow in a laboratory to look for changes in chromosomes, including broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of a genetic disease or condition or some types of cancer. Cytogenetics may be used to help diagnose a disease or condition, plan treatment, or find out how well treatment is working.
    More Information
    - Cytogenetics (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Cytogenetics)
  cytokeratin: (SY-toh-KAYR-uh-tin)
    Pronunciation of dictionary term "cytokeratin"
    A type of protein found on epithelial cells, which line the inside and outside surfaces of the body. Cytokeratins help form the tissues of the hair, nails, and the outer layer of the skin. They are also found on cells in the lining of organs, glands, and other parts of the body. Certain cytokeratins may be found in higher than normal amounts in patients with different types of epithelial cell cancers, including lung, breast, colorectal, bladder, and head and neck cancers. Measuring the amount of specific cytokeratins in the blood may help to plan cancer treatment or find out how well treatment is working or if cancer has come back. A cytokeratin is a type of tumor marker. Also called keratin.
  cytokine: (SY-toh-kine)
    Pronunciation of dictionary term "cytokine"
    A type of protein that is made by certain immune and non-immune cells and has an effect on the immune system. Some cytokines stimulate the immune system and others slow it down. They can also be made in the laboratory and used to help the body fight cancer, infections, and other diseases. Examples of cytokines are interleukins, interferons, and colony-stimulating factors (filgrastim, sargramostim).
    More Information
    - Immune System Modulators (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/immune-system-modulators)
  cytokine release syndrome: (SY-toh-kine reh-LEES SIN-drome)
    Pronunciation of dictionary term "cytokine release syndrome"
    A condition that may occur after treatment with some types of immunotherapy, such as monoclonal antibodies and CAR-T cells. Cytokine release syndrome is caused by a large, rapid release of cytokines into the blood from immune cells affected by the immunotherapy. Cytokines are immune substances that have many different actions in the body. Signs and symptoms of cytokine release syndrome include fever, nausea, headache, rash, rapid heartbeat, low blood pressure, and trouble breathing. Most patients have a mild reaction, but sometimes, the reaction may be severe or life threatening.
  cytokine storm: (SY-toh-kine …)
    Pronunciation of dictionary term "cytokine storm"
    A severe immune reaction in which the body releases too many cytokines into the blood too quickly. Cytokines play an important role in normal immune responses, but having a large amount of them released in the body all at once can be harmful. A cytokine storm can occur as a result of an infection, autoimmune condition, or other disease. It may also occur after treatment with some types of immunotherapy. Signs and symptoms include high fever, inflammation (redness and swelling), and severe fatigue and nausea. Sometimes, a cytokine storm may be severe or life threatening and lead to multiple organ failure. Also called hypercytokinemia.
  cytokine therapy: (SY-toh-kine THAYR-uh-pee)
    Pronunciation of dictionary term "cytokine therapy"
    Treatment that uses cytokines (substances made by immune cells) to help the body fight cancer, infection, or other diseases. Cytokines play an important role in the body’s immune response. They can also be made in the laboratory to use as treatment for different diseases. In cancer, cytokine therapy may help the immune system kill cancer cells or keep them from growing. The two main types of cytokines used to treat cancer are interleukins and interferons.
    More Information
    - Immune System Modulators (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/immune-system-modulators)
  cytology: (sy-TAH-loh-jee)
    Pronunciation of dictionary term "cytology"
    The study of cells using a microscope.
  cytomegalovirus: (SY-toh-MEH-guh-loh-VY-rus)
    Pronunciation of dictionary term "cytomegalovirus"
    A virus that may be carried in an inactive state for life by healthy individuals. It is a cause of severe pneumonia in people with a suppressed immune system, such as those undergoing bone marrow transplantation or those with leukemia or lymphoma. Also called CMV.
  Cytomel: (SY-toh-mel)
    Pronunciation of dictionary term "Cytomel"
    A drug that is used to treat certain thyroid (a gland located near the voice box) conditions. It is also being studied in the treatment of thyroid cancer. Cytomel is made in the laboratory and is a form of the thyroid hormone triiodthyronine (T3). Also called liothyronine sodium and Triostat.
  cytopenia: (SY-toh-PEE-nee-uh)
    Pronunciation of dictionary term "cytopenia"
    A condition in which there is a lower-than-normal number of blood cells.
  cytoplasm: (SY-toh-PLA-zum)
    Pronunciation of dictionary term "cytoplasm"
    The fluid inside a cell but outside the cell's nucleus. Most chemical reactions in a cell take place in the cytoplasm.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  cytosine: (SY-toh-seen)
    Pronunciation of dictionary term "cytosine"
    A chemical compound that is used to make one of the building blocks of DNA and RNA. It is a type of pyrimidine.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  cytoskeleton: (SY-toh-SKEH-leh-tun)
    Pronunciation of dictionary term "cytoskeleton"
    The large network consisting of protein fibers and other molecules that gives shape and structure to cells in the body. The cytoskeleton helps organize structures within the cell called organelles and other substances found in the fluid inside the cell. It plays an important role in many cell functions, including cell movement, signaling, and division. Abnormal changes in the cytoskeleton may lead to the development of many different diseases, including cancer. The cytoskeleton can also affect how cancer cells grow and spread in the body. Also called intracellular matrix.
  cytostatic agent: (SY-toh-STA-tik AY-jent)
    Pronunciation of dictionary term "cytostatic agent"
    A substance that slows or stops the growth of cells, including cancer cells, without killing them. These agents may cause tumors to stop growing and spreading without causing them to shrink in size.
  cytotoxic agent: (SY-toh-TOK-sik AY-jent)
    Pronunciation of dictionary term "cytotoxic agent"
    A substance that kills cells, including cancer cells. These agents may stop cancer cells from dividing and growing and may cause tumors to shrink in size.
  cytotoxic chemotherapy: (SY-toh-TOK-sik KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "cytotoxic chemotherapy"
    Anticancer drugs that kill cells, especially cancer cells.
  cytotoxic T cell: (SY-toh-TOK-sik ... sel)
    Pronunciation of dictionary term "cytotoxic T cell"
    A type of immune cell that can kill certain cells, including foreign cells, cancer cells, and cells infected with a virus. Cytotoxic T cells can be separated from other blood cells, grown in the laboratory, and then given to a patient to kill cancer cells. A cytotoxic T cell is a type of white blood cell and a type of lymphocyte. Also called cytotoxic T lymphocyte and killer T cell.
  cytotoxic T lymphocyte: (SY-toh-TOK-sik ... LIM-foh-site)
    Pronunciation of dictionary term "cytotoxic T lymphocyte"
    A type of immune cell that can kill certain cells, including foreign cells, cancer cells, and cells infected with a virus. Cytotoxic T lymphocytes can be separated from other blood cells, grown in the laboratory, and then given to a patient to kill cancer cells. A cytotoxic T lymphocyte is a type of white blood cell and a type of lymphocyte. Also called cytotoxic T cell and killer T cell.
  cytotoxin: (SY-toh-TOK-sin)
    Pronunciation of dictionary term "cytotoxin"
    A substance that can kill cells.
  Cytoxan: (sy-TOK-sun)
    Pronunciation of dictionary term "Cytoxan"
    A drug that is used to treat many types of cancer and is being studied in the treatment of other types of cancer. It is also used to treat some types of kidney disease in children. Cytoxan attaches to DNA in cells and may kill cancer cells. It is a type of alkylating agent. Also called CTX and cyclophosphamide.
  D&C: A procedure to scrape and remove tissue from the inner lining of the uterus. The cervix is dilated (made larger) and a curette (spoon-shaped instrument) is inserted into the uterus to remove tissue. A tissue sample may then be checked under a microscope for signs of disease, such as infection or cancer. A D&C may also be done after a miscarriage or to treat certain conditions, such as abnormal bleeding. Also called dilatation and curettage and dilation and curettage.
    Dilatation and curettage (D and C). A speculum is inserted into the vagina to widen it in order to look at the cervix (first panel). A dilator is used to widen the cervix (middle panel). A curette is put through the cervix into the uterus to scrape out abnormal tissue (last panel).
    Dilatation and curettage (D and C). Three-panel drawing showing a side view of the female reproductive anatomy during a D and C procedure. The first panel shows a speculum widening the opening of the vagina. The cervix, uterus with abnormal tissue, bladder, and rectum are also shown; an inset shows the lower half of a woman covered by a drape on an exam table with her legs apart and her feet in stirrups. The middle panel shows the uterus and a dilator inserted through the vagina into the cervix. The third panel shows a curette scraping out abnormal tissue from the uterus; an inset shows a close up of the curette with the abnormal tissue in it.
  D-1MT: A substance being studied in the treatment of melanoma and many other types of cancer. D-1MT blocks the breakdown of the amino acid tryptophan, which is needed for T cells (a type of immune system cell) to kill tumor cells. Giving D-1MT to patients who have received chemotherapy for cancer may help kill more tumor cells. It is a type of enzyme inhibitor and immunosuppressant. Also called 1-methyl-d-tryptophan.
  D-20761: A synthetic luteinizing hormone-releasing hormone (LH-RH) antagonist that suppresses LH and sex steroid levels.
  D-cycloserine: (...SY-kloh-SAYR-een)
    Pronunciation of dictionary term "D-cycloserine"
    A drug used to treat tuberculosis. It is also being studied in the treatment of pain and nerve problems (numbness, tingling) caused by chemotherapy and in the treatment of low back pain, autism, certain anxiety disorders, and schizophrenia. D-cycloserine is a type of antibiotic. Also called Seromycin.
  DA-EPOCH-R: An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), and rituximab. During each treatment cycle, the doses of some of the drugs may be increased or decreased to allow the patient to receive the dose that works the best with the fewest side effects. Also called DA-EPOCH-R regimen, dose-adjusted EPOCH-R, and dose-adjusted EPOCH-R regimen.
  DA-EPOCH-R regimen: (… REH-jih-men)
    Pronunciation of dictionary term "DA-EPOCH-R regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), and rituximab. During each treatment cycle, the doses of some of the drugs may be increased or decreased to allow the patient to receive the dose that works the best with the fewest side effects. Also called DA-EPOCH-R, dose-adjusted EPOCH-R, and dose-adjusted EPOCH-R regimen.
  da-huang: (dah-hwong)
    Pronunciation of dictionary term "da-huang"
    The root of this plant has been used in some cultures to treat certain medical problems. It may have anti-inflammatory and anticancer effects. The scientific name is Rheum palmatum or Rheum officinale. Also called Chinese rhubarb, Indian rhubarb, rhubarb, and Turkish rhubarb.
  dabrafenib mesylate: (duh-BRA-feh-nib MEH-zih-layt)
    Pronunciation of dictionary term "dabrafenib mesylate"
    A drug used alone or with trametinib to treat low-grade glioma (a type of brain tumor) in children aged 1 year and older and certain types of anaplastic thyroid cancer, non-small cell lung cancer, melanoma, and other solid tumors that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Dabrafenib mesylate blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called Tafinlar.
    More Information
    - Dabrafenib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib)
  Dabska tumor: (DAB-skuh TOO-mer)
    Pronunciation of dictionary term "Dabska tumor"
    A rare, slow-growing tumor of blood vessels that forms in or under the skin anywhere on the body. Dabska tumors may appear as firm, raised, purplish bumps, which may be small or large. They usually do not spread to other parts of the body. Dabska tumors can occur in children and adults. They are a type of vascular tumor. Also called papillary intralymphatic angioendothelioma.
  DACA: A substance being studied in the treatment of cancer. It is a type of topoisomerase inhibitor. Also called acridine carboxamide.
  dacarbazine: (duh-KAR-buh-zeen)
    Pronunciation of dictionary term "dacarbazine"
    A drug used to treat Hodgkin lymphoma that did not get better with other anticancer drugs and melanoma that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Dacarbazine damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent.
    More Information
    - Dacarbazine (https://www.cancer.gov/about-cancer/treatment/drugs/dacarbazine)
  dacliximab: (duh-KLIK-sih-mab)
    Pronunciation of dictionary term "dacliximab"
    A drug used to keep the body from rejecting kidney transplants. It is also being studied in the treatment of some types of cancer and other conditions. Dacliximab binds to receptors for a protein called interleukin-2, which are found on some types of immune cells and cancer cells. This may help suppress the body’s immune response and it may help kill cancer cells. Dacliximab is a type of monoclonal antibody. Also called daclizumab and Zenapax.
  daclizumab: (duh-KLIH-zoo-mab)
    Pronunciation of dictionary term "daclizumab"
    A drug used to keep the body from rejecting kidney transplants. It is also being studied in the treatment of some types of cancer and other conditions. Daclizumab binds to receptors for a protein called interleukin-2, which are found on some types of immune cells and cancer cells. This may help suppress the body’s immune response and it may help kill cancer cells. Daclizumab is a type of monoclonal antibody. Also called dacliximab and Zenapax.
  Dacogen: (DA-koh-jen)
    Pronunciation of dictionary term "Dacogen"
    A drug used to treat adults with myelodysplastic syndromes, including chronic myelomonocytic leukemia. It is also being studied in the treatment of other types of cancer. Dacogen stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called decitabine.
    More Information
    - Decitabine (https://www.cancer.gov/about-cancer/treatment/drugs/decitabine)
  dacomitinib: (DA-koh-MIH-tih-nib)
    Pronunciation of dictionary term "dacomitinib"
    A drug used to treat non-small cell lung cancer that has spread, has not already been treated, and has certain mutations (changes) in the EGFR gene. It is also being studied in the treatment of other types of cancer. Dacomitinib blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called PF-00299804 and Vizimpro.
    More Information
    - Dacomitinib (https://www.cancer.gov/about-cancer/treatment/drugs/dacomitinib)
  dactinomycin: (DAK-tih-noh-MY-sin)
    Pronunciation of dictionary term "dactinomycin"
    A drug that comes from the bacterium Streptomyces parvulus and is used alone or with other drugs to treat adults and children with Ewing sarcoma, gestational trophoblastic tumor, rhabdomyosarcoma, Wilms tumor, or certain types of testicular cancer and adults with certain types of solid tumors. It is also being studied in the treatment of other types of cancer. Dactinomycin damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic. Also called actinomycin D and Cosmegen.
    More Information
    - Dactinomycin (https://www.cancer.gov/about-cancer/treatment/drugs/dactinomycin)
  daidzein: (DAYD-zine)
    Pronunciation of dictionary term "daidzein"
    An isoflavone found in soy products. Soy isoflavones are being studied in the prevention of cancer.
  dalteparin: (dul-TEH-puh-rin)
    Pronunciation of dictionary term "dalteparin"
    A drug used to prevent blood clots from forming or to treat blood clots that have formed in patients with cancer or other conditions. Dalteparin is a type of anticoagulant. Also called dalteparin sodium and Fragmin.
  dalteparin sodium: (dul-TEH-puh-rin SOH-dee-um)
    Pronunciation of dictionary term "dalteparin sodium"
    A drug used to prevent blood clots from forming or to treat blood clots that have formed in patients with cancer or other conditions. Dalteparin sodium is a type of anticoagulant. Also called Fragmin.
  danazol: (DA-nuh-zole)
    Pronunciation of dictionary term "danazol"
    A synthetic hormone that is a type of androgen and is used to treat endometriosis. It is being evaluated in the treatment of endometrial cancer.
  Danyelza: (dan-YEL-zah)
    Pronunciation of dictionary term "Danyelza"
    A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF) to treat children aged 1 year and older and adults with certain types of high-risk neuroblastoma in the bone or bone marrow that came back or did not get better with other treatment. It is also being studied in the treatment of other types of cancer. Danyelza binds to a substance called GD2, which is found on some types of cancer cells. Danyelza may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called naxitamab.
  dapsone: (DAP-sone)
    Pronunciation of dictionary term "dapsone"
    A drug used to treat acne. It is also used to treat other types of skin diseases and certain bacterial infections, such as leprosy. It blocks bacteria from making a substance that they need to grow. Dapsone is a type of antibacterial agent and a type of anti-inflammatory agent.
  daptomycin: (dap-toh-MY-sin)
    Pronunciation of dictionary term "daptomycin"
    A drug used to treat certain bacterial skin and bloodstream infections in adults. Daptomycin is also being studied in the treatment of fever and neutropenia (an abnormal decrease in the number of neutrophils, a type of white blood cell) in patients with cancer. It is a type of antibiotic. Also called Cubicin.
  DAR: A log of study drugs kept by an investigator running a clinical trial. It lists many things about each drug, including the drug name, lot number, expiration date, the amount of drug received, used, returned, or thrown away, and the amount left. DARs help make sure that a clinical trial is done safely and correctly. DARs are required by the U.S. Food and Drug Administration (FDA). Also called Drug Accountability Record.
  daratumumab: (DAYR-uh-TOOM-yoo-mab)
    Pronunciation of dictionary term "daratumumab"
    A drug used alone or with other drugs to treat adults with multiple myeloma. It is used in patients whose cancer is newly diagnosed and who can or cannot be treated with an autologous stem cell transplant. Daratumumab is also used in patients whose cancer came back or did not get better after treatment with one or more anticancer therapies. It is also being studied in the treatment of other types of cancer. Daratumumab binds to a protein called CD38, which is found on some types of immune cells and cancer cells, including myeloma cells. Daratumumab may block CD38 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Darzalex.
    More Information
    - Daratumumab (https://www.cancer.gov/about-cancer/treatment/drugs/daratumumab)
  daratumumab and hyaluronidase: (DAYR-uh-TOOM-yoo-mab … HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "daratumumab and hyaluronidase"
    A combination of two drugs used alone or with other drugs to treat adults with certain types of multiple myeloma or light chain amyloidosis. It is also being studied in the treatment of other types of cancer. Daratumumab binds to a protein called CD38, which is found on some types of immune cells and cancer cells, including myeloma cells. Daratumumab may block CD38 and help the immune system kill cancer cells. Hyaluronidase allows daratumumab to be given by injection under the skin. Daratumumab and hyaluronidase can be given in less time than daratumumab alone, which is given as an infusion. Also called Darzalex Faspro.
    More Information
    - Daratumumab and Hyaluronidase-fihj (https://www.cancer.gov/about-cancer/treatment/drugs/daratumumabandhyaluronidase-fihj)
  darbepoetin alfa: (dar-bee-POH-ee-tin AL-fuh)
    Pronunciation of dictionary term "darbepoetin alfa"
    A drug used to treat anemia caused by chronic kidney disease and some types of chemotherapy. Darbepoetin alfa is a form of erythropoietin (a substance naturally made by the kidneys) that is made in the laboratory. It helps the bone marrow make more red blood cells. Darbepoetin alfa is a type of antianemic and a type of erythropoiesis-stimulating agent. Also called Aranesp.
    More Information
    - Darbepoetin Alfa (https://www.cancer.gov/about-cancer/treatment/drugs/darbepoetinalfa)
  dark-field microscope: (... MY-kroh-SKOPE)
    Pronunciation of dictionary term "dark-field microscope"
    A microscope (device used to magnify small objects) in which objects are lit at a very low angle from the side so that the background appears dark and the objects show up against this dark background.
  darolutamide: (DAR-oh-LOO-tuh-mide)
    Pronunciation of dictionary term "darolutamide"
    A drug used alone or with docetaxel to treat adults with certain types of prostate cancer. Darolutamide is used in patients whose cancer has spread to other parts of the body and responds to treatment that lowers testosterone levels or whose cancer has not spread to other parts of the body and no longer responds to treatment that lowers testosterone levels. It is also being studied in the treatment of other types of cancer. Darolutamide binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Darolutamide blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called Nubeqa.
    More Information
    - Darolutamide (https://www.cancer.gov/about-cancer/treatment/drugs/darolutamide)
  Darzalex: (DAR-zah-lex)
    Pronunciation of dictionary term "Darzalex"
    A drug used alone or with other drugs to treat adults with multiple myeloma. It is used in patients whose cancer is newly diagnosed and who can or cannot be treated with an autologous stem cell transplant. Darzalex is also used in patients whose cancer came back or did not get better after treatment with one or more anticancer therapies. It is also being studied in the treatment of other types of cancer. Darzalex binds to a protein called CD38, which is found on some types of immune cells and cancer cells, including myeloma cells. Darzalex may block CD38 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called daratumumab.
    More Information
    - Daratumumab (https://www.cancer.gov/about-cancer/treatment/drugs/daratumumab)
  Darzalex Faspro: (DAR-zah-lex FAS-proh)
    Pronunciation of dictionary term "Darzalex Faspro"
    A combination of daratumumab and hyaluronidase used alone or with other drugs to treat adults with certain types of multiple myeloma or light chain amyloidosis. It is also being studied in the treatment of other types of cancer. Daratumumab binds to a protein called CD38, which is found on some types of immune cells and cancer cells, including myeloma cells. Daratumumab may block CD38 and help the immune system kill cancer cells. Hyaluronidase allows daratumumab to be given by injection under the skin. Darzalex Faspro can be given in less time than daratumumab alone, which is given as an infusion. Also called daratumumab and hyaluronidase.
    More Information
    - Daratumumab and Hyaluronidase-fihj (https://www.cancer.gov/about-cancer/treatment/drugs/daratumumabandhyaluronidase-fihj)
  dasatinib: (da-SA-tih-nib)
    Pronunciation of dictionary term "dasatinib"
    A drug used alone or with other drugs to treat adults and children aged 1 year and older with certain types of chronic myeloid leukemia or acute lymphoblastic leukemia that are Philadelphia chromosome positive. It is also being studied in the treatment of other types of cancer. Dasatinib blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called BMS-354825 and Sprycel.
    More Information
    - Dasatinib (https://www.cancer.gov/about-cancer/treatment/drugs/dasatinib)
  Data and Safety Monitoring Board: (DAY-tuh ... SAYF-tee MAH-nih-ter-ing bord)
    Pronunciation of dictionary term "Data and Safety Monitoring Board"
    An impartial group that oversees a clinical trial and reviews the results to see if they are acceptable. This group determines if the trial should be changed or closed. Also called DSMB.
  datopotamab deruxtecan: (DA-toh-POH-tuh-mab DEH-rux-TEE-kan)
    Pronunciation of dictionary term "datopotamab deruxtecan"
    A drug used to treat adults with breast cancer that cannot be removed by surgery or has spread to other parts of the body, has been treated with other therapies, and is hormone receptor positive (HR+) and HER2-negative. It is also being studied in the treatment of other types of cancer. Datopotamab deruxtecan contains a monoclonal antibody called datopotamab that binds to a protein called TROP2, which is found on some cancer cells. It also contains an anticancer drug called deruxtecan, which may help kill cancer cells. Datopotamab deruxtecan is a type of antibody-drug conjugate. Also called Datroway.
    More Information
    - Datopotamab Deruxtecan-dlnk (https://www.cancer.gov/about-cancer/treatment/drugs/datopotamab-deruxtecan-dlnk)
  Datroway: (DA-troh-way)
    Pronunciation of dictionary term "Datroway"
    A drug used to treat adults with breast cancer that cannot be removed by surgery or has spread to other parts of the body, has been treated with other therapies, and is hormone receptor positive (HR+) and HER2-negative. It is also being studied in the treatment of other types of cancer. Datroway contains a monoclonal antibody called datopotamab that binds to a protein called TROP2, which is found on some cancer cells. It also contains an anticancer drug called deruxtecan, which may help kill cancer cells. Datroway is a type of antibody-drug conjugate. Also called datopotamab deruxtecan.
    More Information
    - Datopotamab Deruxtecan-dlnk (https://www.cancer.gov/about-cancer/treatment/drugs/datopotamab-deruxtecan-dlnk)
  daunomycin: (DAW-noh-MY-sin)
    Pronunciation of dictionary term "daunomycin"
    The active ingredient in a drug used with other drugs to treat acute lymphoblastic leukemia and acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. Daunomycin blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called daunorubicin.
  daunomycin hydrochloride: (DAW-noh-MY-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "daunomycin hydrochloride"
    A drug that comes from the bacterium Streptomyces coeruleorubidus and is used with other drugs as remission induction therapy to treat adults with acute myeloid leukemia and adults and children with acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Daunomycin hydrochloride blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Daunorubicin is the active ingredient of daunorubicin hydrochloride. Also called daunorubicin hydrochloride.
    More Information
    - Daunorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochloride)
  daunorubicin: (DAW-noh-ROO-bih-sin)
    Pronunciation of dictionary term "daunorubicin"
    The active ingredient in a drug used with other drugs to treat acute lymphoblastic leukemia and acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. Daunorubicin blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor.
  daunorubicin hydrochloride: (DAW-noh-ROO-bih-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "daunorubicin hydrochloride"
    A drug that comes from the bacterium Streptomyces coeruleorubidus and is used with other drugs as remission induction therapy to treat adults with acute myeloid leukemia and adults and children with acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Daunorubicin hydrochloride blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Daunorubicin is the active ingredient of daunorubicin hydrochloride. Also called daunomycin hydrochloride.
    More Information
    - Daunorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochloride)
  daunorubicin hydrochloride and cytarabine liposome: (DAW-noh-ROO-bih-sin HY-droh-KLOR-ide … sy-TAYR-uh-been LY-poh-some)
    Pronunciation of dictionary term "daunorubicin hydrochloride and cytarabine liposome"
    A form of the anticancer drugs daunorubicin hydrochloride and cytarabine that is contained inside very tiny, fat-like particles and is used to treat adults with certain types of newly diagnosed acute myeloid leukemia. Daunorubicin hydrochloride and cytarabine liposome may have fewer side effects and work better than other forms of these drugs. It is also being studied in the treatment of other types of cancer. Daunorubicin hydrochloride and cytarabine liposome is a type of anthracycline antibiotic, a type of topoisomerase inhibitor, and a type of antimetabolite. Also called Vyxeos.
    More Information
    - Daunorubicin Hydrochloride and Cytarabine Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochlorideandcytarabineliposome)
  Daurismo: (DOOR-is-moh)
    Pronunciation of dictionary term "Daurismo"
    A drug used with low-dose cytarabine to treat acute myeloid leukemia that is newly diagnosed. It is used in patients who are 75 years and older or in patients who cannot be treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Daurismo blocks a type of protein involved in cell growth and repair and may block the growth of cancer cells. It is a type of hedgehog signaling pathway antagonist. Also called glasdegib maleate.
    More Information
    - Glasdegib Maleate (https://www.cancer.gov/about-cancer/treatment/drugs/glasdegibmaleate)
  DBA: A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with DBA may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called Blackfan–Diamond anemia, congenital hypoplastic anemia, congenital pure red cell aplasia, Diamond-Blackfan anemia, erythrogenesis imperfecta, and inherited erythroblastopenia.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  DBE: A procedure used to look at the inside of the small intestine. A special instrument made up of two tubes (one inside the other) is inserted through the mouth or rectum and into the small intestine. The inside tube, which is an endoscope with a light and lens for viewing, is moved through part of the small intestine, and a balloon at the end of it is inflated to keep the endoscope in place. Next, the outer tube is moved through the small intestine to reach the end of the endoscope, and a balloon at the end of the outer tube is inflated to keep it in place. Then, the balloon at the end of the endoscope is deflated, and the endoscope is moved through the next part of the small intestine. These steps are repeated many times as the tubes move through the whole small intestine. This allows the doctor to see all of the small intestine. Tissue samples may be removed so they can be checked under a microscope for signs of disease. Also called double balloon endoscopy and double balloon enteroscopy.
  DBVE: An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, and etoposide. Also called ABVE, ABVE regimen, and DBVE regimen.
    More Information
    - ABVE (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE)
  DBVE regimen: (… REH-jih-men)
    Pronunciation of dictionary term "DBVE regimen"
    An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, and etoposide. Also called ABVE, ABVE regimen, and DBVE.
    More Information
    - ABVE (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE)
  DBVE-PC: An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, etoposide, prednisone, and cyclophosphamide. Also called ABVE-PC, ABVE-PC regimen, and DBVE-PC regimen.
    More Information
    - ABVE-PC (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE-PC)
  DBVE-PC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "DBVE-PC regimen"
    An abbreviation for a chemotherapy combination used with radiation therapy to treat childhood Hodgkin lymphoma. It includes the drugs doxorubicin hydrochloride (Adriamycin), bleomycin sulfate, vincristine sulfate, etoposide, prednisone, and cyclophosphamide. Also called ABVE-PC, ABVE-PC regimen, and DBVE-PC.
    More Information
    - ABVE-PC (https://www.cancer.gov/about-cancer/treatment/drugs/ABVE-PC)
  DCF: An abbreviation for a chemotherapy combination used to treat certain types of head and neck cancer and stomach cancer. It includes the drugs docetaxel (Taxotere), cisplatin (Platinol), and fluorouracil. Also called docetaxel-cisplatin-fluorouracil, Taxotere-Platinol-fluorouracil, TPF, and TPF regimen.
    More Information
    - TPF (https://www.cancer.gov/about-cancer/treatment/drugs/TPF)
  DCIS: A condition in which abnormal cells are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. In some cases, DCIS may become invasive breast cancer and spread to other tissues. At this time, there is no way to know which abnormal cells could become invasive. Also called ductal carcinoma in situ and intraductal breast carcinoma.
    Ductal carcinoma in situ (DCIS). Abnormal cells are found in the lining of a breast duct.
    Ductal carcinoma in situ (DCIS); drawing shows a lobe, ducts, and fatty tissue in a cross section of the breast. The inset shows a normal duct and a duct with abnormal cells.
  DDB2 gene: (… jeen)
    Pronunciation of dictionary term "DDB2 gene"
    A gene that makes a protein involved in many cell functions, including the repair of damaged DNA. Mutations (changes) in the DDB2 gene may cause cells to lose their ability to repair damaged DNA, which may lead to abnormal cell growth. DDB2 gene mutations have been found in an inherited condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
  DDS: A rare disorder that causes kidney failure before age 3, abnormal development of the sexual organs, and, in most cases, Wilms tumor (a type of kidney cancer). Children with Denys-Drash syndrome are also at high risk of some other types of cancer. Also called Denys-Drash syndrome.
    More Information
    - Denys-Drash syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5576/denys-drash-syndrome)
    - Denys-Drash syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/denys-drash-syndrome/)
  de Gramont regimen: (dey gruh-MON REH-jih-men)
    Pronunciation of dictionary term "de Gramont regimen"
    A chemotherapy combination used to treat colorectal cancer. It is also used with radiation therapy to treat esophageal cancer and stomach cancer. It includes the drugs fluorouracil and leucovorin calcium.
  de novo: (deh NOH-voh)
    Pronunciation of dictionary term "de novo"
    In cancer, the first occurrence of cancer in the body.
  de novo mutation: (deh NOH-voh myoo-TAY-shun)
    Pronunciation of dictionary term "de novo mutation"
    A term used to describe a change in the DNA sequence of a gene that is seen for the first time in a person and has not appeared in previous generations. A de novo mutation can explain how a person can have a genetic condition that did not occur in his or her parents. A de novo mutation can occur in an egg or sperm cell of a parent, in the fertilized egg soon after the egg and sperm unite, or in another type of cell during embryo development. A person who has a de novo mutation may pass the mutation to his or her child. Some de novo mutations may lead to cancer or other diseases. Also called de novo variant, new mutation, and new variant.
  de novo variant: (deh NOH-voh VAYR-ee-unt)
    Pronunciation of dictionary term "de novo variant"
    A term used to describe a change in the DNA sequence of a gene that is seen for the first time in a person and has not appeared in previous generations. A de novo variant can explain how a person can have a genetic condition that did not occur in his or her parents. A de novo variant can occur in an egg or sperm cell of a parent, in the fertilized egg soon after the egg and sperm unite, or in another type of cell during embryo development. A person who has a de novo variant may pass the mutation to his or her child. Some de novo variants may lead to cancer or other diseases. Also called de novo mutation, new mutation, and new variant.
  de qi sensation: (duh chee sen-SAY-shun)
    Pronunciation of dictionary term "de qi sensation"
    Tingling, numbness, heaviness, and other feelings that occur after an acupuncture needle has been properly placed in the body. The needle may be twirled, moved up and down at different speeds and depths, heated, or charged with a small electric current until the de qi sensation occurs.
  death cap: (deth kap)
    Pronunciation of dictionary term "death cap"
    A type of poisonous mushroom that has harmful effects on the kidneys and liver. It is responsible for most fatal cases of mushroom poisoning. Also called Amanita phalloides.
  death rattle: (... RA-tul)
    Pronunciation of dictionary term "death rattle"
    A gurgling sound that comes from the back of the throat of a dying person. It is caused by the build-up of saliva and mucus in the throat and upper airways when the person is too weak to cough.
    More Information
    - Last Days of Life
  death receptor 4: (… reh-SEP-ter 4)
    Pronunciation of dictionary term "death receptor 4"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of death receptor 4 on cancer cells may kill more cells. Also called DR4, TRAIL receptor 1, TRAIL-R1, and tumor necrosis factor receptor superfamily member 10A.
  death receptor 5: (… reh-SEP-ter 5)
    Pronunciation of dictionary term "death receptor 5"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of death receptor 5 on cancer cells may kill more cells. Also called DR5, TRAIL receptor 2, TRAIL-R2, and tumor necrosis factor receptor superfamily member 10B.
  DEB: A rare, inherited disorder in which blisters form on the skin and the moist inner lining of some organs and body cavities. The blisters usually appear at birth and may occur on certain parts of the body (such as the hands, feet, elbows, and knees) or all over the body (including the mouth, esophagus, and other parts of the gastrointestinal tract, the eyes, and the genitourinary tract). This can lead to scarring in the affected areas and thinning of the skin. Other signs and symptoms include small white bumps on the skin; deformities in the fingers, toes, nails, teeth, and joints; trouble chewing and swallowing; vision loss and other eye problems; anemia; slow growth; and poor nutrition. Some people with DEB have a very high risk of developing squamous cell skin cancer at an early age. There are several types of DEB. It is caused by a mutation (change) in the COL7A1 gene. Also called dystrophic epidermolysis bullosa.
    More Information
    - Dystrophic epidermolysis bullosa (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2150/dystrophic-epidermolysis-bullosa)
    - Dystrophic epidermolysis bullosa (MedlinePlus) (https://medlineplus.gov/genetics/condition/dystrophic-epidermolysis-bullosa/)
  debulking: (dee-BUL-king)
    Pronunciation of dictionary term "debulking"
    Surgical removal of as much of a tumor as possible. Debulking may increase the chance that chemotherapy or radiation therapy will kill all the tumor cells. It may also be done to relieve symptoms or help the patient live longer. Also called tumor debulking.
  deceased: (dih-SEEST)
    Pronunciation of dictionary term "deceased"
    Dead.
  decitabine: (deh-SY-tuh-been)
    Pronunciation of dictionary term "decitabine"
    A drug used to treat adults with myelodysplastic syndromes, including chronic myelomonocytic leukemia. It is also being studied in the treatment of other types of cancer. Decitabine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called Dacogen.
    More Information
    - Decitabine (https://www.cancer.gov/about-cancer/treatment/drugs/decitabine)
  decitabine and cedazuridine: (deh-SY-tuh-been … SEE-daz-YOOR-ih-deen)
    Pronunciation of dictionary term "decitabine and cedazuridine"
    A combination of two drugs used to treat adults with myelodysplastic syndromes, including chronic myelomonocytic leukemia. It is also being studied in the treatment of other types of cancer. Decitabine stops cells from making DNA, which may help keep cancer cells from growing and may kill them. Cedazuridine prevents the breakdown of decitabine in the body, which may allow more cancer cells to be killed. Decitabine and cedazuridine is a type of antimetabolite and a type of cytidine deaminase inhibitor. Also called Inqovi.
    More Information
    - Decitabine and Cedazuridine (https://www.cancer.gov/about-cancer/treatment/drugs/decitabineandcedazuridine)
  Declomycin: (DEH-kloh-MY-sin)
    Pronunciation of dictionary term "Declomycin"
    A substance being studied as a way to detect bone growth in patients receiving bisphosphonates (a type of drug used to treat bone pain caused by some types of cancer) for breast cancer. It binds to newly formed bone. A biopsy is done and bone growth is measured using a special microscope. Declomycin also blocks the uptake of water by the kidney and can bind calcium in bones. It is a type of tetracycline antibiotic and a type of bone-labeling agent. Also called demeclocycline hydrochloride.
  decortication: (deh-KOR-tih-KAY-shun)
    Pronunciation of dictionary term "decortication"
    Removal of part or all of the external surface of an organ.
  decubitus ulcer: (deh-KYOO-bih-tus UL-ser)
    Pronunciation of dictionary term "decubitus ulcer"
    Damage to an area of the skin caused by constant pressure on the area for a long time. This pressure can lessen blood flow to the affected area, which may lead to tissue damage and tissue death. Decubitus ulcers often form on the skin covering bony areas of the body, such as the back, tailbone, hips, buttocks, elbows, heels, and ankles. Patients who are not able to get out of bed or change their position, or who always use a wheelchair have an increased risk of decubitus ulcers. Signs and symptoms include changes in skin color and swelling, warmth, tenderness, and pain in the affected area. If untreated, the skin may crack, blister, or break open and form a sore or ulcer, which may have pus-like drainage. Decubitus ulcers often heal slowly and if not treated can damage tissues deep under the skin, including fat, muscle, and bone. Also called bedsore, pressure sore, and pressure ulcer.
  deductible: (dee-DUK-tih-bul)
    Pronunciation of dictionary term "deductible"
    The amount of money that a patient with health insurance pays for health care services before the health insurance plan begins to pay. Health care services may include visits to the doctor, laboratory tests, prescription medicines, and hospital stays. Not all health care plans require a deductible. Usually, plans with higher deductibles have lower monthly premiums (payments).
  deep breathing: (… BREE-thing)
    Pronunciation of dictionary term "deep breathing"
    A relaxation technique in which a person focuses on taking slow, deep breaths. Deep breathing involves breathing in slowly through the nose and then out through the mouth using the diaphragm (the thin muscle that separates the chest from the abdomen) and abdominal muscles. This helps boost the amount of oxygen in the blood, lowers blood pressure and heart rate, and reduces muscle tension. Deep breathing may be used to help relieve stress, pain, and anxiety. Also called abdominal breathing and diaphragmatic breathing.
  deep sedation: (… seh-DAY-shun)
    Pronunciation of dictionary term "deep sedation"
    A level of sedation in which a person is in a deep sleep, loses feeling, and is hard to wake up. Deep sedation is caused by special drugs and is used to help relieve anxiety during certain medical or surgical procedures. Oxygen may also be given to help the patient breathe and drugs that relieve pain may be given at the same time. The patient usually does not remember the procedure.
  deep vein thrombosis: (… vayn throm-BOH-sis)
    Pronunciation of dictionary term "deep vein thrombosis"
    The formation of a blood clot in a deep vein of the leg or lower pelvis. Symptoms may include pain, swelling, warmth, and redness in the affected area. Also called DVT.
  defecation: (DEH-feh-kay-shun)
    Pronunciation of dictionary term "defecation"
    Movement of feces (undigested food, bacteria, mucus, and cells from the lining of the intestines) through the bowel and out the anus. Also called bowel movement.
  deferasirox: (deh-FER-a-ser-ox)
    Pronunciation of dictionary term "deferasirox"
    A drug used to treat too much iron in the blood caused by blood transfusions. It is being studied in the treatment of myelodysplastic syndromes (a group of diseases in which the bone marrow does not make enough healthy blood cells) and other conditions. Deferasirox binds to extra iron in the blood. The drug and the iron are passed from the body in urine. It is a type of chelating agent. Also called Exjade.
  deferoxamine: (DEH-feh-ROK-suh-meen)
    Pronunciation of dictionary term "deferoxamine"
    An iron-chelating agent that removes iron from tumors by inhibiting DNA synthesis and causing cancer cell death. It is used in conjunction with other anticancer agents in pediatric neuroblastoma therapy.
  deferred therapy: (deh-FURD THAYR-uh-pee)
    Pronunciation of dictionary term "deferred therapy"
    Closely watching a patient’s condition but not giving treatment unless symptoms appear or change, or there are changes in test results. Deferred therapy avoids problems that may be caused by treatments such as radiation or surgery. It is used to find early signs that the condition is getting worse. During deferred therapy, patients may be given certain exams and tests. It is sometimes used in prostate cancer. Also called expectant management.
  defibrotide sodium: (dee-FY-broh-tide SOH-dee-um)
    Pronunciation of dictionary term "defibrotide sodium"
    A drug used to treat hepatic veno-occlusive disease (a condition in which small veins in the liver are blocked) in adults and children who also have kidney or lung problems after receiving a stem cell transplant. Defibrotide sodium may affect the cells that line the inside of blood vessels and may help improve blood flow inside the liver. Also called Defitelio.
    More Information
    - Defibrotide Sodium (https://www.cancer.gov/about-cancer/treatment/drugs/defibrotide-sodium)
  deficiency: (deh-FIH-shun-see)
    Pronunciation of dictionary term "deficiency"
    In medicine, a shortage of a substance (such as a vitamin or mineral) needed by the body.
  deficient DNA mismatch repair: (deh-FIH-shunt ... MIS-match reh-PAYR)
    Pronunciation of dictionary term "deficient DNA mismatch repair"
    Describes cells that have mutations (changes) in certain genes that are involved in correcting mistakes made when DNA is copied in a cell. DNA mismatch repair (MMR) deficient cells usually have many DNA mutations, which may lead to cancer. DNA MMR deficiency is most common in colorectal cancer, other types of gastrointestinal cancer, and endometrial cancer, but it may also be found in cancers of the breast, prostate, bladder, and thyroid and in an inherited disorder called Lynch syndrome. Knowing if a tumor is DNA MMR deficient may help plan treatment or predict how well the tumor will respond to treatment. Also called deficient mismatch repair, dMMR, mismatch repair deficiency, and MMR deficiency.
  deficient mismatch repair: (deh-FIH-shunt MIS-match reh-PAYR)
    Pronunciation of dictionary term "deficient mismatch repair"
    Describes cells that have mutations (changes) in certain genes that are involved in correcting mistakes made when DNA is copied in a cell. Mismatch repair (MMR) deficient cells usually have many DNA mutations, which may lead to cancer. MMR deficiency is most common in colorectal cancer, other types of gastrointestinal cancer, and endometrial cancer, but it may also be found in cancers of the breast, prostate, bladder, and thyroid and in an inherited disorder called Lynch syndrome. Knowing if a tumor is MMR deficient may help plan treatment or predict how well the tumor will respond to treatment. Also called deficient DNA mismatch repair, dMMR, mismatch repair deficiency, and MMR deficiency.
  definitive diagnosis: (deh-FIH-nih-tiv DY-ug-NOH-sis)
    Pronunciation of dictionary term "definitive diagnosis"
    A final diagnosis that is made after getting the results of tests, such as blood tests and biopsies, that are done to find out if a certain disease or condition is present.
  definitive treatment: (deh-FIH-nih-tiv TREET-ment)
    Pronunciation of dictionary term "definitive treatment"
    The treatment plan for a disease or disorder that has been chosen as the best one for a patient after all other choices have been considered.
  Defitelio: (DEH-fih-TEH-lee-oh)
    Pronunciation of dictionary term "Defitelio"
    A drug used to treat hepatic veno-occlusive disease (a condition in which small veins in the liver are blocked) in adults and children who also have kidney or lung problems after receiving a stem cell transplant. Defitelio may affect the cells that line the inside of blood vessels and may help improve blood flow inside the liver. Also called defibrotide sodium.
    More Information
    - Defibrotide Sodium (https://www.cancer.gov/about-cancer/treatment/drugs/defibrotide-sodium)
  degarelix acetate: (DEH-guh-REH-lix A-seh-tayt)
    Pronunciation of dictionary term "degarelix acetate"
    A drug used to treat advanced prostate cancer. Degarelix acetate binds to gonadotropin-releasing hormone (GnRH) receptors in the pituitary gland. This causes the testicles to stop making testosterone. Degarelix acetate may stop the growth of cancer cells that need testosterone to grow. It is a type of GnRH antagonist. Also called Firmagon.
    More Information
    - Degarelix (https://www.cancer.gov/about-cancer/treatment/drugs/degarelix)
  degenerative disease: (deh-JEH-neh-ruh-tiv dih-ZEEZ)
    Pronunciation of dictionary term "degenerative disease"
    A disease in which the function or structure of the affected tissues or organs changes for the worse over time. Osteoarthritis, osteoporosis, and Alzheimer disease are examples.
  dehydration: (dee-hy-DRAY-shun)
    Pronunciation of dictionary term "dehydration"
    A condition that occurs when the body loses too much water and other fluids that it needs to work normally. Dehydration is usually caused by severe diarrhea and vomiting, but it may also be caused by not drinking enough water or other fluids, sweating too much, fever, urinating too much, or taking certain medicines. Signs and symptoms include thirst, dry mouth, headache, fatigue, dark-colored urine, urinating less than normal, sunken eyes or cheeks, dry and cool skin, dizziness, fainting, muscle cramps, rapid heartbeat, and rapid breathing. Dehydration can be severe, especially in young children and older adults.
  dehydroepiandrosterone: (dee-HY-droh-EH-pee-an-DROS-teh-rone)
    Pronunciation of dictionary term "dehydroepiandrosterone"
    A substance being studied in the prevention of cancer. It is a type of steroid. Also called DHEA.
  delayed-type hypersensitivity response: (...HY-per-SEN-sih-TIH-vih-tee reh-SPONTS)
    Pronunciation of dictionary term "delayed-type hypersensitivity response"
    An inflammatory response that develops 24 to 72 hours after exposure to an antigen that the immune system recognizes as foreign. This type of immune response involves mainly T cells rather than antibodies (which are made by B cells). Also called DTH.
  deleterious mutation: (DEH-leh-TEER-ee-us myoo-TAY-shun)
    Pronunciation of dictionary term "deleterious mutation"
    A change in the DNA sequence of a gene that causes a person to have or be at risk of developing a certain genetic disorder or disease, such as cancer. Deleterious mutations can be inherited from a parent or occur during a person’s lifetime. Knowing if a person has a deleterious mutation may help prevent, diagnose, and treat diseases, such as cancer. Not everyone who has a deleterious mutation will develop the disease. Also called disease-causing mutation, pathogenic variant, predisposing mutation, and susceptibility gene mutation.
  deletion 17p: (deh-LEE-shun …)
    Pronunciation of dictionary term "deletion 17p"
    The loss of all or part of the short arm (also called the p arm) of chromosome 17. The deletion 17p leads to the loss of the tumor suppressor gene TP53, which is linked to many genetic conditions and some types of cancer, such as leukemia, multiple myeloma, and myelodysplastic syndrome. Checking for the deletion 17p may help diagnose cancer, plan treatment, or make a prognosis. Also called 17p deletion and chromosome 17p deletion.
  delirium: (deh-LEER-ee-um)
    Pronunciation of dictionary term "delirium"
    A mental state in which a person is confused and has reduced awareness of their surroundings. The person may also be anxious, agitated, or have less energy than usual and be tired or depressed. Delirium can also cause hallucinations and changes in attention span, mood or behavior, judgement, muscle control, and sleeping patterns. The symptoms of delirium usually occur suddenly, last a short time, and may come and go. It may be caused by infection, dehydration, abnormal levels of some electrolytes, organ failure, medicines, or serious illness, such as advanced cancer.
  demeclocycline hydrochloride: (DEH-meh-kloh-SY-kleen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "demeclocycline hydrochloride"
    A substance being studied as a way to detect bone growth in patients receiving bisphosphonates (a type of drug used to treat bone pain caused by some types of cancer) for breast cancer. It binds to newly formed bone. A biopsy is done and bone growth is measured using a special microscope. Demeclocycline hydrochloride also blocks the uptake of water by the kidney and can bind calcium in bones. It is a type of tetracycline antibiotic and a type of bone-labeling agent. Also called Declomycin.
  dementia: (deh-MEN-shuh)
    Pronunciation of dictionary term "dementia"
    A condition in which a person loses the ability to think, remember, learn, make decisions, and solve problems. Symptoms may also include personality changes and emotional problems. There are many causes of dementia, including Alzheimer disease, brain cancer, and brain injury. Dementia usually gets worse over time.
  Demerol: (DEH-meh-ROL)
    Pronunciation of dictionary term "Demerol"
    A drug used to treat moderate to severe pain. Demerol works by binding to opioid receptors, such as the mu opioid receptor, in the central nervous system. This blocks pain signals and changes how the body responds to pain. Demerol is a type of synthetic opioid agonist that works as an analgesic (pain reliever). Also called meperidine hydrochloride.
  dendritic cell: (den-DRIH-tik sel)
    Pronunciation of dictionary term "dendritic cell"
    A special type of immune cell that is found in tissues, such as the skin, and boosts immune responses by showing antigens on its surface to other cells of the immune system. A dendritic cell is a type of phagocyte and a type of antigen-presenting cell (APC).
  dendritic cell vaccine: (den-DRIH-tik sel vak-SEEN)
    Pronunciation of dictionary term "dendritic cell vaccine"
    A vaccine made of antigens and dendritic antigen-presenting cells (APCs).
  denial: (deh-NY-ul)
    Pronunciation of dictionary term "denial"
    In psychiatry, a state in which a person is unable or unwilling to see the truth or reality about an issue or situation.
  denileukin diftitox: (DEH-nih-LOO-kin DIF-tih-tox)
    Pronunciation of dictionary term "denileukin diftitox"
    A drug used to treat adults with stage I, stage II, or stage III cutaneous T-cell lymphoma that came back or did not get better after treatment with at least one other systemic therapy. It is also being studied in the treatment of other types of cancer. Denileukin diftitox is made by combining interleukin-2 (IL-2) with a bacterial toxin. The IL-2 part of the drug attaches to the cancer cells and the toxin kills them. Denileukin diftitox is a type of immunotoxin and a type of recombinant fusion protein. Also called Lymphir.
    More Information
    - Denileukin Diftitox-cxdl (https://www.cancer.gov/about-cancer/treatment/drugs/denileukindiftitox-cxdl)
  denomination: (deh-NAH-mih-NAY-shun)
    Pronunciation of dictionary term "denomination"
    In religion, describes a group whose members are organized under a common name and set of rules and have common beliefs and practices.
  denosumab: (deh-noh-SOO-mab)
    Pronunciation of dictionary term "denosumab"
    A drug used to prevent or treat certain bone problems. Denosumab is used under the brand name Xgeva to prevent bone problems caused by multiple myeloma or by solid tumors that have spread to the bone. It is also used in certain patients to treat giant cell tumor of the bone that cannot be removed by surgery, and to treat hypercalcemia that is caused by cancer and did not get better after treatment with bisphosphonates. Denosumab is also used under the brand name Prolia to increase bone mass in certain patients with breast cancer or prostate cancer who have a high risk of breaking bones. It is also used to treat osteoporosis in certain patients who have a high risk of breaking bones. Denosumab is also being studied in the treatment of other conditions and types of cancer. It binds to a protein called RANKL, which keeps RANKL from binding to another protein called RANK on the surface of certain bone cells, including bone cancer cells. This may help keep bone from breaking down and cancer cells from growing. Denosumab may also prevent the loss of calcium from the bones. It is a type of monoclonal antibody. Also called AMG 162.
    More Information
    - Denosumab (https://www.cancer.gov/about-cancer/treatment/drugs/denosumab)
  dense breast: (dents brest)
    Pronunciation of dictionary term "dense breast"
    A term used to describe breast tissue that has more fibrous and glandular tissue than fatty tissue. Dense breast tissue can only be seen on a mammogram. Having dense breast tissue may make it harder to see breast cancer or other changes in the breast on a mammogram. Women with dense breast tissue have a higher risk of breast cancer than those with mostly fatty or less dense breast tissue. Having dense breast tissue is common, especially in younger women and in women taking hormone therapy for menopause.
    More Information
    - Dense Breasts: Answers to Commonly Asked Questions (https://www.cancer.gov/types/breast/breast-changes/dense-breasts)
  dense connective tissue: (dents kuh-NEK-tiv TIH-shoo)
    Pronunciation of dictionary term "dense connective tissue"
    A type of tissue that is mostly made up of tough protein fibers called collagen and cells called fibroblasts. Dense connective tissue supports, protects, and holds bones, muscles, and other tissues and organs in place. Ligaments, tendons, the inner layer of the skin, and the sclera (the white outer layer of the eye) are all types of dense connective tissue. Also called fibrous connective tissue.
  dental implant: (DEN-tul IM-plant)
    Pronunciation of dictionary term "dental implant"
    A metal device that is surgically placed in the jawbone. It acts as an anchor for an artificial tooth or teeth.
  dentist: (DEN-tist)
    Pronunciation of dictionary term "dentist"
    A health professional who has special training in caring for the teeth, gums, and other tissues in the mouth.
  Denys-Drash syndrome: (deh-NEES-drash SIN-drome)
    Pronunciation of dictionary term "Denys-Drash syndrome"
    A rare disorder that causes kidney failure before age 3, abnormal development of the sexual organs, and, in most cases, Wilms tumor (a type of kidney cancer). Children with Denys-Drash syndrome are also at high risk of some other types of cancer. Also called DDS.
    More Information
    - Denys-Drash syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5576/denys-drash-syndrome)
    - Denys-Drash syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/denys-drash-syndrome/)
  deoxycytidine: (dee-OK-see-SY-tih-deen)
    Pronunciation of dictionary term "deoxycytidine"
    A drug that protects healthy tissues from the toxic effects of anticancer drugs.
  deoxyribonucleic acid: (dee-OK-see-RY-boh-noo-KLAY-ik A-sid)
    Pronunciation of dictionary term "deoxyribonucleic acid"
    The molecule inside cells that contains the genetic information needed for a person and most other organisms to develop and grow and is passed from one generation to the next. Deoxyribonucleic acid is made up of two strands that twist into the shape of a spiral ladder called a double helix. Each strand has a backbone that is made up of sugar and phosphate molecules that attach to one of four bases: adenine (A), thymine (T), guanine (G), and cytosine (C). The bases pair up with one another (A with T, and G with C) to form chemical bonds, which act like rungs on a ladder. This holds the two strands of deoxyribonucleic acid together. Also called DNA.
    More Information
    - Deoxyribonucleic Acid (DNA) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Deoxyribonucleic-Acid)
    - What is DNA? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/basics/dna/)
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  Depakene: (DEH-puh-KEEN)
    Pronunciation of dictionary term "Depakene"
    A drug used to treat epileptic seizures and bipolar disorder and to prevent migraine headaches. It is also being studied in the treatment of several types of cancer. It blocks an enzyme that cells need to grow and may cause cancer cells to die. It also blocks the growth of new blood vessels that tumors need to grow. It is a type of anticonvulsant, histone deacetylase (HDAC) inhibitor, antimaniacal, migraine headache prophylactic, and antiangiogenesis agent. Also called Stavzor and valproic acid.
  Department of Health and Human Services: (deh-PART-ment … helth … HYOO-mun SER-vih-ses)
    Pronunciation of dictionary term "Department of Health and Human Services"
    The U.S. federal government agency responsible for protecting the public’s health and providing important services, especially for people in need. The Department of Health and Human Services works with state and local governments throughout the country to do research and provide public health services, food and drug safety programs, health insurance programs, and many other services. There are several federal agencies that are a part of the Department of Health and Human Services. They include the Food and Drug Administration (FDA), the Centers for Disease Control and Prevention (CDC), the National Institutes of Health (NIH), and the Centers for Medicare and Medicaid Services (CMMS). Also called DHHS and HHS.
    More Information
    - U.S. Department of Health and Human Services (https://www.hhs.gov/)
  Depo-Cyt: (DEE-poh-SITE)
    Pronunciation of dictionary term "Depo-Cyt"
    A form of the anticancer drug cytarabine that is contained inside very tiny, fat-like particles. It may have fewer side effects and work better than cytarabine. It is used to treat lymphoma that has spread to the meninges (three thin layers of tissue that cover and protect the brain and spinal cord). It is also being studied in the treatment of other types of cancer. It is a type of antimetabolite. Also called cytarabine liposome and liposomal cytarabine.
    More Information
    - Cytarabine Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabineliposome)
  depression: (dee-PREH-shun)
    Pronunciation of dictionary term "depression"
    A mental condition marked by ongoing feelings of sadness, despair, loss of energy, and difficulty dealing with normal daily life. Other symptoms of depression include feelings of worthlessness and hopelessness, loss of pleasure in activities, changes in eating or sleeping habits, and thoughts of death or suicide. Depression can affect anyone, and can be successfully treated. Depression affects 15-25% of cancer patients.
    More Information
    - Depression
  depsipeptide: (DEP-see-PEP-tide)
    Pronunciation of dictionary term "depsipeptide"
    A substance that is made naturally by some bacteria, fungi, and other organisms, and can also be made in the laboratory. Depsipeptides are being studied in the treatment of cancer.
  derivative: (deh-RIH-vuh-tiv)
    Pronunciation of dictionary term "derivative"
    In chemistry, a compound produced from or related to another.
  dermabrasion: (DER-muh-BRAY-zhun)
    Pronunciation of dictionary term "dermabrasion"
    A type of surgery used to make the skin smooth and to improve the way deep scars, pits, and wrinkles look. After numbing the skin, a doctor removes the top layer of skin using sandpaper or a brush or burr (small file) that spins at a high speed.
  dermatitis: (DER-muh-TY-tis)
    Pronunciation of dictionary term "dermatitis"
    Inflammation of the skin.
  dermatofibrosarcoma protuberans: (DER-muh-toh-FY-broh-sar-KOH-muh proh-TOO-beh-ranz)
    Pronunciation of dictionary term "dermatofibrosarcoma protuberans"
    A type of tumor that begins as a hard nodule and grows slowly. These tumors are usually found in the dermis (the inner layer of the two main layers of tissue that make up the skin) of the limbs or trunk of the body. They can grow into surrounding tissue but do not spread to other parts of the body. These tumors are related to giant cell fibroblastomas.
  dermatologist: (der-muh-TAH-loh-jist)
    Pronunciation of dictionary term "dermatologist"
    A doctor who has special training to diagnose and treat skin problems.
  dermatomyositis: (DER-muh-toh-MY-oh-SY-tis)
    Pronunciation of dictionary term "dermatomyositis"
    A disease that causes inflammation of the skin and muscles. Signs and symptoms include a red or bluish-purple patchy rash on the face, eyelids, knuckles, elbows, knees, toes, chest, or back. The rash may cause swelling, itching, and pain. Dermatomyositis can also cause muscle weakness in the upper body, hips, and thighs; trouble swallowing; breathing problems; and calcium deposits, which look like hard bumps under the skin or in the muscle. People with dermatomyositis may have an increased risk of certain heart, lung, or connective tissue diseases and certain types of cancer, including cancers of the cervix, lungs, pancreas, breast, ovaries, and gastrointestinal tract. Dermatomyositis can occur in both children and adults.
    More Information
    - Dermatomyositis (MedlinePlus) (https://medlineplus.gov/ency/article/000839.htm)
    - Dermatomyositis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6263/dermatomyositis)
  dermatoscope: (der-MA-toh-SKOPE)
    Pronunciation of dictionary term "dermatoscope"
    A small, handheld device used to examine the skin, nails, scalp, and hair. A dermatoscope has a light and a special magnifying lens that can show skin lesions or other suspicious areas on the skin more clearly than the eye alone. Sometimes a thin layer of alcohol, gel, or oil is placed on the skin lesion to make it easier to see. Some dermatoscopes can also take pictures or videos of the area being examined. A dermatoscope may be used to help diagnose skin cancer or other skin-related conditions, such as vitiligo, scabies, and hair loss.
  dermis: (DER-mis)
    Pronunciation of dictionary term "dermis"
    The inner layer of the two main layers of the skin. The dermis has connective tissue, blood vessels, oil and sweat glands, nerves, hair follicles, and other structures. It is made up of a thin upper layer called the papillary dermis, and a thick lower layer called the reticular dermis.
    Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue.
    Skin anatomy; drawing shows layers of the epidermis, dermis, and subcutaneous tissue including hair shafts and follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and a sweat gland.
  dermoid cyst: (DER-moyd sist)
    Pronunciation of dictionary term "dermoid cyst"
    A type of tumor that contains a cyst filled with tissues that are normally found in the outer layers of the skin, including sweat and oil glands. These may also contain elements of hair and teeth. Dermoid cysts can form anywhere in the body, but they usually form in the ovary, testes, the skin of the head, neck, face, or lower back, or in the central nervous system. Dermoid cysts are benign (not cancer) and tend to grow slowly. They are present at birth but may not be found until later in life. Dermoid cysts are a type of germ cell tumor called a mature teratoma.
  DES: A synthetic form of the hormone estrogen that was prescribed to pregnant women between about 1940 and 1971 because it was thought to prevent miscarriages. DES may increase the risk of uterine, ovarian, or breast cancer in women who took it. It also has been linked to an increased risk of clear cell carcinoma of the vagina or cervix in daughters exposed to DES before birth. Also called diethylstilbestrol.
    More Information
    - Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet)
  DES daughter: (… DAH-ter)
    Pronunciation of dictionary term "DES daughter"
    A female who was exposed before birth to a synthetic form of the hormone estrogen called diethylstilbestrol (DES) because their mother took DES while pregnant with them. DES was prescribed for some pregnant women between about 1940 and 1971 because it was thought to prevent miscarriage, premature labor, and other complications related to pregnancy. It was stopped in 1971 due to medical problems that were seen in the children of women who took it. DES daughters were found to have an increased risk of precancerous lesions in the cervix and clear cell adenocarcinoma of the cervix or vagina. DES daughters may also have an increased risk of breast cancer, pancreatic cancer or other pancreatic disorders, cardiovascular disease, and depression. Other health problems that may have affected DES daughters include early menopause, fertility and pregnancy problems, and structural changes in the female reproductive tract.
    More Information
    - Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet)
  DES son: A male who was exposed before birth to a synthetic form of the hormone estrogen called diethylstilbestrol (DES) because their mother took DES while pregnant with them. DES was prescribed to some pregnant women between about 1940 and 1971 because it was thought to prevent miscarriage, premature labor, and other complications related to pregnancy. It was stopped in 1971 due to medical problems that were seen in the children of women who took it. DES sons have an increased risk of cysts in the testicles and may have other testicular problems, such as undescended testicles (a condition in which one or both testicles fail to move from the abdomen into the scrotum) and an increased risk of inflammation or infection of the testicles.
    More Information
    - Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet)
  deslorelin: (DES-loh-REH-lin)
    Pronunciation of dictionary term "deslorelin"
    A substance being studied in the treatment of cancer as a way to block sex hormones made by the ovaries or testicles. It is a type of gonadotropin-releasing hormone analog.
  desmoid tumor: (DEZ-moyd TOO-mer)
    Pronunciation of dictionary term "desmoid tumor"
    A rare type of soft tissue tumor that forms in fibrous connective tissue of the body, usually in the abdomen, head and neck, shoulders, upper arms, and thighs. Desmoid tumors are intermediate tumors, meaning they can grow into and damage nearby tissue (locally aggressive) but do not spread to other parts of the body. They are painful, difficult to completely remove with surgery, and often come back after surgery. Desmoid tumors occur in adults and children. Also called aggressive fibromatosis and desmoid-type fibromatosis.
    More Information
    - Desmoid Tumor (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/desmoid-tumor)
    - Tumor desmoide (https://www.cancer.gov/pediatric-adult-rare-tumor/espanol/tumores-raros/tumores-raros-tejidos-blandos/tumor-desmoide)
  desmoid-type fibromatosis: (DEZ-moyd … FY-broh-muh-TOH-sis)
    Pronunciation of dictionary term "desmoid-type fibromatosis"
    A rare type of soft tissue tumor that forms in fibrous connective tissue of the body, usually in the abdomen, head and neck, shoulders, upper arms, and thighs. Desmoid-type fibromatoses are intermediate tumors, meaning they can grow into and damage nearby tissue (locally aggressive) but do not spread to other parts of the body. They are painful, difficult to completely remove with surgery, and often come back after surgery. Desmoid-type fibromatoses occur in adults and children. Also called aggressive fibromatosis and desmoid tumor.
    More Information
    - Desmoid Tumor (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/desmoid-tumor)
    - Tumor desmoide (https://www.cancer.gov/pediatric-adult-rare-tumor/espanol/tumores-raros/tumores-raros-tejidos-blandos/tumor-desmoide)
  desmoplastic: (DES-moh-PLAS-tik)
    Pronunciation of dictionary term "desmoplastic"
    Causing or forming adhesions or fibrous connective tissue within a tumor.
  desmoplastic melanoma: (DES-moh-PLAS-tik MEH-luh-NOH-muh)
    Pronunciation of dictionary term "desmoplastic melanoma"
    A rare form of malignant melanoma marked by nonpigmented lesions on sun-exposed areas of the body, most commonly on the head and neck.
  desmoplastic small round cell tumor: (DES-moh-PLAS-tik ... TOO-mer)
    Pronunciation of dictionary term "desmoplastic small round cell tumor"
    A rare, aggressive cancer that usually affects young males and usually is located in the abdomen.
  detoxify: (dee-TOK-sih-fy)
    Pronunciation of dictionary term "detoxify"
    To make something less poisonous or harmful. It may refer to the process of removing toxins, poisons, or other harmful substances from the body.
  developmental stage: (dee-VEH-lup-MEN-tul stayj)
    Pronunciation of dictionary term "developmental stage"
    The physical, mental, and emotional stages a child goes through as he or she grows and matures.
  deviant: (DEE-vee-unt)
    Pronunciation of dictionary term "deviant"
    Different from what is normal or standard, especially in terms of behavior.
  device: (dee-VISE)
    Pronunciation of dictionary term "device"
    An object that has a specific use. In medicine, wheelchairs, pumps, and artificial limbs are examples of devices.
  DEXA: An imaging test that measures bone density (the amount of bone mineral contained in a certain volume of bone) by passing x-rays with two different energy levels through the bone. It is used to diagnose osteoporosis (decrease in bone mass and density). Also called BMD scan, bone mineral density scan, DEXA scan, dual energy x-ray absorptiometric scan, dual x-ray absorptiometry, and DXA.
  DEXA scan: (… skan)
    Pronunciation of dictionary term "DEXA scan"
    A procedure that measures the amount of calcium and other minerals in a bone by passing x-rays with two different energy levels through the bone. A DEXA scan shows the strength and thickness of a bone and is usually done in the lower spine, hip, lower arm, wrist, fingers, and heel. It is used to diagnose osteoporosis (a condition of lower bone density), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. A DEXA scan also measures fat and muscle composition in specific parts of the body, such as the arms, legs, and pelvis. Also called BMD scan, bone densitometry, bone mineral density scan, dual energy x-ray absorptiometry, and DXA.
  dexamethasone: (DEK-suh-MEH-thuh-sone)
    Pronunciation of dictionary term "dexamethasone"
    A drug used to reduce inflammation and lower the body’s immune response. It is used with other drugs to treat leukemia, lymphoma, mycosis fungoides (a type of skin lymphoma), and multiple myeloma. Dexamethasone is also used alone or with other drugs to prevent or treat many other diseases and conditions. These include conditions related to cancer and its treatment, such as anemia (a low level of red blood cells), allergic reactions, swelling in the brain, and high levels of calcium in the blood. Dexamethasone is a type of corticosteroid.
    More Information
    - Dexamethasone (https://www.cancer.gov/about-cancer/treatment/drugs/dexamethasone)
  dexmethylphenidate: (dex-MEH-thul-FEH-nih-dayt)
    Pronunciation of dictionary term "dexmethylphenidate"
    A substance being studied in the treatment of fatigue and nervous system side effects caused by chemotherapy. It is a type of central nervous system stimulant.
  dexrazoxane: (DEX-ruh-ZOK-sane)
    Pronunciation of dictionary term "dexrazoxane"
    The active ingredient in a drug used to treat severe side effects caused by certain anticancer drugs. It is used to treat the toxic effects of an anticancer drug that leaks from a vein into surrounding tissue and causes tissue damage. Dexrazoxane is also used to reduce heart damage in women given doxorubicin for breast cancer that has spread to other parts of the body. It is also being studied in the treatment of some types of cancer. Dexrazoxane is a type of cardioprotective agent, a type of chemoprotective agent, and a type of topoisomerase inhibitor.
  dexrazoxane hydrochloride: (DEX-ruh-ZOK-sane HY-droh-KLOR-ide)
    Pronunciation of dictionary term "dexrazoxane hydrochloride"
    A drug used to treat severe side effects caused by certain types of anticancer drugs. It is used under the brand names Totect and Zinecard to reduce heart damage in women who are receiving doxorubicin for breast cancer that has spread to other parts of the body. It is also used under the brand name Totect to treat the toxic effects of an anticancer drug that leaks from a vein into surrounding tissue and causes tissue damage. Dexrazoxane hydrochloride is also being studied in the treatment of some types of cancer. It is a type of cardioprotective agent, a type of chemoprotective agent, and a type of topoisomerase inhibitor. Dexrazoxane is the active ingredient of dexrazoxane hydrochloride.
    More Information
    - Dexrazoxane Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/dexrazoxanehydrochloride)
  dextroamphetamine-amphetamine: (DEK-stroh-am-FEH-tuh-meen-am-FEH-tuh-meen)
    Pronunciation of dictionary term "dextroamphetamine-amphetamine"
    A combination of drugs used as a treatment for attention deficit hyperactivity disorder (ADHD) and narcolepsy (a sleep disorder). It is a type of stimulant. Also called Adderall.
  dextromethorphan acetic acid: (DEK-stroh-meh-THOR-fan uh-SEE-tik A-sid)
    Pronunciation of dictionary term "dextromethorphan acetic acid"
    An anticancer drug that is a type of angiogenesis inhibitor.
  DFMO: A substance being studied in the treatment of cancer. Also called difluoromethylornithine.
  DFS: In cancer, the length of time after primary treatment for a cancer ends that the patient survives without any signs or symptoms of that cancer. In a clinical trial, measuring the DFS is one way to see how well a new treatment works. Also called disease-free survival, relapse-free survival, and RFS.
  DHA-paclitaxel: (...PA-klih-TAK-sil)
    Pronunciation of dictionary term "DHA-paclitaxel"
    A combination of DHA (a natural fatty acid) and paclitaxel (an anticancer drug) being studied in the treatment of cancer. It is a type of mitotic inhibitor.
  DHEA: A substance being studied in the prevention of cancer. It is a type of steroid. Also called dehydroepiandrosterone.
  DHFR inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "DHFR inhibitor"
    A substance that can build up in cancer cells and block them from using folate. Folate is a nutrient that rapidly dividing cells need to make DNA. Blocking folate use helps keep cancer cells from growing and may kill them. Some DHFR inhibitors are used to treat cancer. A DHFR inhibitor is a type of antifolate. Also called dihydrofolate reductase inhibitor.
  DHHS: The U.S. federal government agency responsible for protecting the public’s health and providing important services, especially for people in need. The DHHS works with state and local governments throughout the country to do research and provide public health services, food and drug safety programs, health insurance programs, and many other services. There are several federal agencies that are a part of the DHHS. They include the Food and Drug Administration (FDA), the Centers for Disease Control and Prevention (CDC), the National Institutes of Health (NIH), and the Centers for Medicare and Medicaid Services (CMMS). Also called Department of Health and Human Services and HHS.
    More Information
    - U.S. Department of Health and Human Services (https://www.hhs.gov/)
  DHL: A rare, aggressive (fast-growing) type of B-cell non-Hodgkin lymphoma caused by changes in the DNA that affect a gene called the MYC gene and either the BCL2 gene or the BCL6 gene. DHL may be hard to treat and has a poor prognosis. It is a type of diffuse large B-cell lymphoma. Also called double-hit lymphoma.
  DHPLN: A childhood condition in which abnormal tissue grows on the outer part of one or both kidneys. DHPLN usually develops into Wilms tumor (a type of childhood kidney cancer) if not treated. Also called diffuse hyperplastic perilobar nephroblastomatosis.
  DHT: A hormone made from testosterone in the prostate, testes, and certain other tissues. It is needed to develop and maintain male sex characteristics, such as facial hair, deep voice, and muscle growth. High amounts of DHT may increase the growth of prostate cancer and make it harder to treat. Also called androstanolone and dihydrotestosterone.
  di-dgA-RFB4: An anticancer drug that is a combination of a monoclonal antibody (RFB4) and an immunotoxin (dgA).
  diabetes: (dy-uh-BEE-teez)
    Pronunciation of dictionary term "diabetes"
    Any of several diseases in which the kidneys make a large amount of urine. Diabetes usually refers to diabetes mellitus in which there is also a high level of glucose (a type of sugar) in the blood because the body does not make enough insulin or use it the way it should.
  diabetes insipidus: (dy-uh-BEE-teez in-SIH-pih-dus)
    Pronunciation of dictionary term "diabetes insipidus"
    A condition in which a person is very thirsty and makes large amounts of urine. The most common types of diabetes insipidus are central diabetes insipidus (a pituitary disorder) and nephrogenic diabetes insipidus (kidney failure). Diabetes insipidus is not related to diabetes mellitus, which is more common.
  diabetes mellitus: (dy-uh-BEE-teez MEH-lih-tus)
    Pronunciation of dictionary term "diabetes mellitus"
    A disease in which the body does not control the amount of glucose (a type of sugar) in the blood and the kidneys make a large amount of urine. This disease occurs when the body does not make enough insulin or does not use it the way it should.
  diacetylmorphine: (dy-A-seh-til-MOR-feen)
    A highly addictive substance once used to treat severe pain but is now illegal to use or sell in the United States. It is made from morphine, a natural substance found in the seed pods of the opium poppy plant. Diacetylmorphine works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and changes how the body responds to pain. It is a type of analgesic (pain reliever) and a type of opiate. Also called diamorphine and heroin.
  diagnosis: (DY-ug-NOH-sis)
    Pronunciation of dictionary term "diagnosis"
    The process of identifying a disease, condition, or injury from its signs and symptoms. A health history, physical exam, and tests, such as blood tests, imaging tests, and biopsies, may be used to help make a diagnosis.
  diagnostic mammogram: (DY-ug-NAH-stik MA-muh-gram)
    Pronunciation of dictionary term "diagnostic mammogram"
    An x-ray picture of the breast used to check for breast cancer after a lump or other sign or symptom of the disease has been found. It is also used to follow up on a suspicious change found during a screening mammogram. A diagnostic mammogram usually involves taking more detailed x-ray pictures of the breast from different angles to check the suspicious area more closely.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  diagnostic procedure: (DY-ug-NAH-stik proh-SEE-jer)
    Pronunciation of dictionary term "diagnostic procedure"
    A test used to help figure out what disease or condition a person has based on their signs and symptoms. Diagnostic procedures may also be used to help plan treatment, find out how well treatment is working, and make a prognosis. There are many different types of diagnostic procedures. Examples include laboratory tests (such as blood and urine tests), imaging tests (such as mammography and CT scan), endoscopy (such as colonoscopy and bronchoscopy), and biopsy. Also called diagnostic test.
  diagnostic technique: (DY-ug-NAH-stik tek-NEEK)
    Pronunciation of dictionary term "diagnostic technique"
    A type of method or test used to help diagnose a disease or condition. Imaging tests and tests to measure blood pressure, pulse, and temperature are examples of diagnostic techniques.
  diagnostic test: (DY-ug-NAH-stik …)
    Pronunciation of dictionary term "diagnostic test"
    A test used to help figure out what disease or condition a person has based on their signs and symptoms. Diagnostic tests may also be used to help plan treatment, find out how well treatment is working, and make a prognosis. There are many different types of diagnostic tests. Examples include laboratory tests (such as blood and urine tests), imaging tests (such as mammography and CT scan), endoscopy (such as colonoscopy and bronchoscopy), and biopsy. Also called diagnostic procedure.
  diagnostic trial: (DY-ug-NAH-stik TRY-ul)
    Pronunciation of dictionary term "diagnostic trial"
    A research study that evaluates methods of detecting disease.
  dialysis: (dy-A-luh-sis)
    Pronunciation of dictionary term "dialysis"
    The process of filtering the blood when the kidneys are not able to cleanse it.
  diameter: (dy-A-meh-ter)
    Pronunciation of dictionary term "diameter"
    The length of a straight line that extends from one edge of a tumor or other object, through its center and to the opposite edge. It is usually used to measure the size of round or spherical shapes.
  Diamond-Blackfan anemia: (DY-uh-mund-BLAK-fan uh-NEE-mee-uh)
    Pronunciation of dictionary term "Diamond-Blackfan anemia"
    A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with Diamond-Blackfan anemia may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called Blackfan–Diamond anemia, congenital hypoplastic anemia, congenital pure red cell aplasia, DBA, erythrogenesis imperfecta, and inherited erythroblastopenia.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  diamorphine: (dy-uh-MOR-feen)
    A highly addictive substance once used to treat severe pain but is now illegal to use or sell in the United States. It is made from morphine, a natural substance found in the seed pods of the opium poppy plant. Diamorphine works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and changes how the body responds to pain. It is a type of analgesic (pain reliever) and a type of opiate. Also called diacetylmorphine and heroin.
  diaphragm: (DY-uh-fram)
    Pronunciation of dictionary term "diaphragm"
    The thin muscle below the lungs and heart that separates the chest from the abdomen.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  diaphragmatic breathing: (DY-uh-fruh-MA-tik BREE-thing)
    Pronunciation of dictionary term "diaphragmatic breathing"
    A relaxation technique in which a person focuses on taking slow, deep breaths. Diaphragmatic breathing involves breathing in slowly through the nose and then out through the mouth using the diaphragm (the thin muscle that separates the chest from the abdomen) and abdominal muscles. This helps boost the amount of oxygen in the blood, lowers blood pressure and heart rate, and reduces muscle tension. Diaphragmatic breathing may be used to help relieve stress, pain, and anxiety. Also called abdominal breathing and deep breathing.
  diarrhea: (dy-uh-REE-uh)
    Pronunciation of dictionary term "diarrhea"
    Frequent or uncontrollable bowel movements that may be soft, loose, or watery. Other symptoms of diarrhea include stomach pain or cramps, excessive gas, nausea, and fever. Severe diarrhea may lead to serious health problems such as dehydration. Diarrhea is a common side effect of many cancer treatments, such as chemotherapy, immunotherapy, and radiation therapy.
    More Information
    - Diarrhea and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/diarrhea)
  diathermy: (DY-uh-THER-mee)
    Pronunciation of dictionary term "diathermy"
    A procedure in which tissue is heated to destroy abnormal cells. The heat may come from electric currents, microwaves, radio waves, or ultrasound. Diathermy is a type of hyperthermia therapy. Also called electrodiathermy.
  diazepam: (dy-A-zeh-pam)
    Pronunciation of dictionary term "diazepam"
    A drug used to treat mild to moderate anxiety and tension and to relax muscles. It is a type of benzodiazepine. Also called Valium.
  diaziquone: (dy-A-zih-kwone)
    Pronunciation of dictionary term "diaziquone"
    An anticancer drug that is able to cross the blood-brain barrier and kill cancer cells in the central nervous system. Also called AZQ.
  DICER1 syndrome: (… SIN-drome)
    Pronunciation of dictionary term "DICER1 syndrome"
    A rare, inherited disorder that is caused by a mutation (change) in a gene called DICER1. Having this mutation increases the risk of certain types of tumors, including tumors of the kidney, thyroid, ovary, cervix, testicle, brain, eye, and lining of the lung. The tumors may be benign (not cancer) or malignant (cancer). A goiter (an enlarged thyroid) and polyps in the colon may also occur. Not all people who have a mutation in the DICER1 gene will develop tumors.
    More Information
    - DICER1-related pleuropulmonary blastoma cancer predisposition syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10734/dicer1-related-pleuropulmonary-blastoma-cancer-predisposition-syndrome)
    - DICER1 syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/dicer1-syndrome/)
  diclofenac: (dy-KLOH-feh-nak)
    Pronunciation of dictionary term "diclofenac"
    The active ingredient in a drug that is used to treat the symptoms of rheumatoid arthritis and is being studied in the prevention and treatment of some types of skin cancer. It blocks substances that cause inflammation and pain. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of cyclooxygenase inhibitor, a type of nonsteroidal anti-inflammatory drug (NSAID), and a type of antiangiogenesis agent.
  diclofenac sodium: (dy-KLOH-feh-nak SOH-dee-um)
    Pronunciation of dictionary term "diclofenac sodium"
    A drug that is used to treat the symptoms of rheumatoid arthritis and is being studied in the prevention and treatment of some types of skin cancer. It blocks substances that cause inflammation and pain. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of cyclooxygenase inhibitor, a type of nonsteroidal anti-inflammatory drug (NSAID), and a type of antiangiogenesis agent. Also called Voltaren.
  diclofenac sodium gel: (dy-KLOH-feh-nak SOH-dee-um jel)
    Pronunciation of dictionary term "diclofenac sodium gel"
    The gel form of a drug that is used to treat the symptoms of rheumatoid arthritis and is being studied in the prevention and treatment of some types of skin cancer. It blocks substances that cause inflammation and pain. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of cyclooxygenase inhibitor, a type of nonsteroidal anti-inflammatory drug (NSAID), and a type of antiangiogenesis agent. Also called Voltaren gel.
  didanosine: (dy-DA-noh-seen)
    Pronunciation of dictionary term "didanosine"
    A drug used in the treatment of infections caused by viruses.
  DIEP flap: (… flap)
    Pronunciation of dictionary term "DIEP flap"
    A type of breast reconstruction in which blood vessels called deep inferior epigastric perforators (DIEP), and the skin and fat connected to them are removed from the lower abdomen and used for reconstruction. Muscle is left in place.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  diet: (DY-et)
    Pronunciation of dictionary term "diet"
    The things a person eats and drinks.
  dietary counseling: (DY-uh-TAYR-ee KOWN-suh-ling)
    Pronunciation of dictionary term "dietary counseling"
    A process by which a health professional with special training in nutrition helps people make healthy food choices and form healthy eating habits. In cancer treatment, the goal of dietary counseling is to help patients stay healthy during and after treatment and to stay strong enough to fight infections and the recurrence of disease. Also called nutritional counseling.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  dietary protocol: (DY-uh-TAYR-ee PROH-tuh-KOL)
    Pronunciation of dictionary term "dietary protocol"
    A detailed diet plan that states what, how, and when a person will eat and drink. It may be used to test how a specific diet affects a health outcome, such as lower cholesterol.
  Dietary Reference Intakes: (DY-uh-TAYR-ee REH-frents IN-tayks)
    Pronunciation of dictionary term "Dietary Reference Intakes"
    A set of guidelines developed by U.S. and Canadian scientists to give information about the role of nutrients in human health. These guidelines include the Reference Daily Intakes (RDI), which are the recommended amounts of nutrients to be eaten each day to meet the needs of most healthy people. This system replaced the Recommended Dietary Allowances (RDA). Also called DRI.
  dietary supplement: (DY-uh-TAYR-ee SUH-pleh-ment)
    Pronunciation of dictionary term "dietary supplement"
    A product that is added to the diet. A dietary supplement is taken by mouth and usually contains one or more dietary ingredients. Examples of dietary ingredients include vitamins, minerals, herbs, amino acids, and enzymes. A person should talk with their health care provider before taking dietary supplements, as some may have side effects or interact with other dietary supplements and medicines. Also called nutritional supplement.
    More Information
    - Cancer Therapy Interactions With Foods and Dietary Supplements
    - FDA 101: Dietary Supplements (https://www.fda.gov/consumers/consumer-updates/fda-101-dietary-supplements)
  diethylstilbestrol: (dy-EH-thul-stil-BES-trol)
    Pronunciation of dictionary term "diethylstilbestrol"
    A synthetic form of the hormone estrogen that was prescribed to pregnant women between about 1940 and 1971 because it was thought to prevent miscarriages. Diethylstilbestrol may increase the risk of uterine, ovarian, or breast cancer in women who took it. It also has been linked to an increased risk of clear cell carcinoma of the vagina or cervix in daughters exposed to diethylstilbestrol before birth. Also called DES.
    More Information
    - Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet)
  dietitian: (dy-eh-TIH-shun)
    Pronunciation of dictionary term "dietitian"
    A health professional who has special training in diet and nutrition. Dietitians offer advice on nutrition and healthy eating habits to help people improve their health and well-being. Dietitians also help people who are recovering from illness or surgery or who have medical conditions, such as food allergies, eating disorders, swallowing problems, diabetes, heart or kidney disease, or cancer, meet their nutritional needs. Dietitians may provide nutritional counseling, meal planning, medical nutrition therapy (such as a special diet, dietary supplements, or intravenous or tube feedings), and nutrition education programs. Also called registered dietitian.
  differentiated thyroid cancer: (DIH-feh-REN-shee-AY-ted THY-royd KAN-ser)
    Pronunciation of dictionary term "differentiated thyroid cancer"
    A type of thyroid cancer in which the cancer cells look similar to normal thyroid cells when viewed under a microscope. Most differentiated thyroid cancers form in the follicular cells of the thyroid gland. They tend to grow slowly, can be treated, and can usually be cured. The most common types of differentiated thyroid cancer are papillary thyroid cancer and follicular thyroid cancer.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
  differentiating agent: (DIH-feh-REN-shee-AY-ting AY-jent)
    Pronunciation of dictionary term "differentiating agent"
    A substance that causes a cell to change from an immature form to a mature form. In cancer, a differentiating agent may help cancer cells to become more like normal cells and to grow and spread more slowly. Some differentiating agents are being studied in the prevention and treatment of cancer.
  differentiation: (DIH-feh-REN-shee-AY-shun)
    Pronunciation of dictionary term "differentiation"
    In biology, describes the processes by which immature cells become mature cells with specific functions. In cancer, this describes how much or how little tumor tissue looks like the normal tissue it came from. Well-differentiated cancer cells look more like normal cells and tend to grow and spread more slowly than poorly differentiated or undifferentiated cancer cells. Differentiation is used in tumor grading systems, which are different for each type of cancer.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  differentiation syndrome: (DIH-feh-REN-shee-AY-shun SIN-drome)
    Pronunciation of dictionary term "differentiation syndrome"
    A serious side effect that may occur in patients with acute promyelocytic leukemia or other types of acute myeloid leukemia who have been treated with certain types of anticancer drugs. Differentiation syndrome usually occurs within 1 to 2 weeks after starting treatment, but it can occur later. It is caused by a large, rapid release of cytokines (immune substances) from leukemia cells that are affected by the anticancer drugs. Signs and symptoms of differentiation syndrome include fever; cough; trouble breathing; weight gain; swelling of the arms, legs, and neck; build-up of excess fluid around the heart and lungs; low blood pressure; and kidney failure. Differentiation syndrome can be life-threatening if not treated early.
  diffuse: (dih-FYOOS)
    Pronunciation of dictionary term "diffuse"
    Widely spread; not localized or confined.
  diffuse hyperplastic perilobar nephroblastomatosis: (dih-FYOOS HY-per-PLAS-tik payr-ee-LOH-bar NEH-froh-blas-TOH-muh-TOH-sis)
    Pronunciation of dictionary term "diffuse hyperplastic perilobar nephroblastomatosis"
    A childhood condition in which abnormal tissue grows on the outer part of one or both kidneys. Diffuse hyperplastic perilobar nephroblastomatosis usually develops into Wilms tumor (a type of childhood kidney cancer) if not treated. Also called DHPLN.
  diffuse intrinsic pontine glioma: (dih-FYOOS in-TRIN-sik PON-teen glee-OH-muh)
    Pronunciation of dictionary term "diffuse intrinsic pontine glioma"
    A rare, fast-growing tumor that forms in cells called glial cells in a part of the brain stem called the pons. Diffuse intrinsic pontine gliomas tend to spread to nearby tissue and other parts of the brain stem, are hard to treat, and have a poor prognosis (outcome). They usually occur in children. Also called DIPG.
    More Information
    - Diffuse Intrinsic Pontine Glioma (DIPG)
    Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.
    Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.
  diffuse large B-cell lymphoma: (dih-FYOOS larj ... sel lim-FOH-muh)
    Pronunciation of dictionary term "diffuse large B-cell lymphoma"
    A term used to describe a group of fast-growing B-cell non-Hodgkin lymphomas (NHL) in which the cancer cells look large when viewed under a microscope. Diffuse large B-cell lymphomas are the most common type of NHL and are marked by rapidly growing tumors in the lymph nodes, spleen, liver, bone marrow, or other tissues and organs. Signs and symptoms may include swollen lymph nodes, fever, drenching night sweats, fatigue, and weight loss. Diffuse large B-cell lymphomas can occur at any age but are more common in older adults. They may sometimes be called by the more general term, large B-cell lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  diffuse optical imaging: (dih-FYOOS OP-tih-kul IH-muh-jing)
    Pronunciation of dictionary term "diffuse optical imaging"
    A procedure that uses light waves to create 2-dimensional (2-D) or 3-dimensional (3-D) pictures of tissues inside the body. Diffuse optical imaging may be used to look at blood flow to the tissues and to measure changes in the amount of oxygen in them. This may help show the difference between normal and abnormal tissue. Diffuse optical imaging may be especially useful for looking at soft tissue, such as breast and brain tissue. It is being studied as an imaging test to help diagnose early-stage breast cancer and other conditions. Also called DOI.
  diffuse optical tomography: (dih-FYOOS OP-tih-kul toh-MAH-gruh-fee)
    Pronunciation of dictionary term "diffuse optical tomography"
    A procedure that uses light waves to create 3-dimensional (3-D) pictures of tissues inside the body. The pictures are created by a computer linked to the light source. Diffuse optical tomography may be used to look at blood flow to the tissues and to measure changes in the amount of oxygen in them. This may help show the difference between normal and abnormal tissue. Diffuse optical tomography may be especially useful for looking at soft tissue, such as breast and brain tissue. It is being studied as an imaging test to help diagnose early-stage breast cancer and other conditions. Also called DOT.
  difluoromethylornithine: (dy-FLOOR-oh-MEH-thul-OR-nih-theen)
    Pronunciation of dictionary term "difluoromethylornithine"
    A substance being studied in the treatment of cancer. Also called DFMO.
  digestion: (dy-JES-chun)
    Pronunciation of dictionary term "digestion"
    The process of breaking down food into substances the body can use for energy, tissue growth, and repair.
  digestive system: (dy-JES-tiv SIS-tem)
    Pronunciation of dictionary term "digestive system"
    The organs that take in food and liquids and break them down into substances that the body can use for energy, growth, and tissue repair. Waste products the body cannot use leave the body through bowel movements. The digestive system includes the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. It also includes the salivary glands, liver, gallbladder, and pancreas, which make digestive juices and enzymes that help the body digest food and liquids. Also called gastrointestinal system.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
    Anatomy of the digestive system. The digestive system is made up of organs that are important for digesting food and liquids. These include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. The digestive system also includes the salivary glands, liver, gallbladder, and pancreas, which make digestive juices and enzymes that help with digestion.
    Anatomy of the digestive system; drawing shows the mouth, salivary glands, pharynx (throat), esophagus, stomach, liver, gallbladder, pancreas, small intestine, large intestine, rectum, and anus.
  digestive tract: (dy-JES-tiv trakt)
    Pronunciation of dictionary term "digestive tract"
    The organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. The digestive tract is part of the digestive system. Also called alimentary tract and gastrointestinal tract.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
    Anatomy of the digestive tract. The digestive tract is made up of organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.
    Anatomy of the digestive tract; drawing shows the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.
  digital breast tomosynthesis: (DIH-jih-tul brest toh-moh-SIN-thuh-sis)
    Pronunciation of dictionary term "digital breast tomosynthesis"
    A procedure that uses x-rays to take a series of pictures of the inside of the breast from many different angles. A computer is used to make 3-D pictures of the breast from these x-rays. Digital breast tomosynthesis is used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). It may allow doctors to see breast tissue, including dense breast tissue, more clearly than with 2-D mammography. This may make breast tumors or other changes in the breast easier to find. Also called 3-D mammography and 3-dimensional mammography.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
    - Breast Cancer Screening
  digital image analysis: (DIH-jih-tul IH-mij uh-NA-lih-sis)
    Pronunciation of dictionary term "digital image analysis"
    A method in which an image or other type of data is changed into a series of dots or numbers so that it can be viewed and studied on a computer. In medicine, this type of image analysis is being used to study organs or tissues, and in the diagnosis and treatment of disease.
  digital mammography: (DIH-jih-tul ma-MAH-gruh-fee)
    Pronunciation of dictionary term "digital mammography"
    The use of a computer, rather than x-ray film, to create a picture of the breast.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  digital photography: (DIH-jih-tul fuh-TAH-gruh-fee)
    Pronunciation of dictionary term "digital photography"
    A type of photography in which images can be viewed on a computer screen.
  digital rectal examination: (DIH-jih-tul REK-tul eg-ZA-mih-NAY-shun)
    Pronunciation of dictionary term "digital rectal examination"
    An examination in which a doctor inserts a lubricated, gloved finger into the rectum to feel for abnormalities. Also called DRE.
    Digital rectal exam (DRE). The doctor inserts a gloved, lubricated finger into the rectum and feels the rectum, anus, and prostate (in males) to check for anything abnormal.
    Digital rectal exam; drawing shows a side view of the male reproductive anatomy and the urinary anatomy, including the prostate, rectum, and bladder. Also shown is a gloved, lubricated finger inserted into the rectum to feel the rectum, anus, and prostate.
  digitalis: (DIH-jih-TA-lis)
    Pronunciation of dictionary term "digitalis"
    A substance used to make drugs that are used to treat several heart conditions, including congestive heart failure. Digitalis is made from the dried leaves of Digitalis purpurea (common foxglove) plants. It is a type of cardiac glycoside.
  digoxin: (dih-JOK-sin)
    Pronunciation of dictionary term "digoxin"
    A drug used to treat irregular heartbeat and some types of heart failure. It is also being studied in the treatment of some types of cancer. Digoxin helps the heart work normally by controlling the amount of calcium that goes into the heart muscle. It also may kill cancer cells and make them more sensitive to anticancer drugs. It is a type of cardiac glycoside. Also called Lanoxin.
  dihematoporphyrin ether: (dy-HEE-muh-toh-POR-fih-rin EE-ther)
    Pronunciation of dictionary term "dihematoporphyrin ether"
    Used in photodynamic therapy, a drug that is absorbed by tumor cells; when exposed to light, it becomes active and kills the cancer cells.
  dihydrofolate reductase inhibitor: (dy-HY-droh-FOH-layt ree-DUK-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "dihydrofolate reductase inhibitor"
    A substance that can build up in cancer cells and block them from using folate. Folate is a nutrient that rapidly dividing cells need to make DNA. Blocking folate use helps keep cancer cells from growing and may kill them. Some dihydrofolate reductase inhibitors are used to treat cancer. A dihydrofolate reductase inhibitor is a type of antifolate. Also called DHFR inhibitor.
  dihydrotestosterone: (dy-HY-droh-tes-TOS-teh-rone)
    Pronunciation of dictionary term "dihydrotestosterone"
    A hormone made from testosterone in the prostate, testes, and certain other tissues. It is needed to develop and maintain male sex characteristics, such as facial hair, deep voice, and muscle growth. High amounts of dihydrotestosterone may increase the growth of prostate cancer and make it harder to treat. Also called androstanolone and DHT.
  diindolylmethane: (dy-IN-doh-lil-MEH-thayn)
    Pronunciation of dictionary term "diindolylmethane"
    A substance being studied in the treatment of prostate cancer and in the prevention of cervical cancer. Diindolylmethane is found in cruciferous vegetables like broccoli, brussels sprouts, cauliflower, cabbage, and kale. It is a type of plant indole. Also called DIM.
  Dilantin: (dy-LAN-tin)
    Pronunciation of dictionary term "Dilantin"
    A drug used to treat or prevent seizures or convulsions that may be caused by epilepsy, brain surgery, or treatment for brain cancer. It is a type of anticonvulsant agent. Also called phenytoin sodium.
  dilatation and curettage: (DIH-luh-TAY-shun … kyoo-reh-TAZH)
    Pronunciation of dictionary term "dilatation and curettage"
    A procedure to scrape and remove tissue from the inner lining of the uterus. The cervix is dilated (made larger) and a curette (spoon-shaped instrument) is inserted into the uterus to remove tissue. A tissue sample may then be checked under a microscope for signs of disease, such as infection or cancer. A dilatation and curettage may also be done after a miscarriage or to treat certain conditions, such as abnormal bleeding. Also called D&C and dilation and curettage.
    Dilatation and curettage (D and C). A speculum is inserted into the vagina to widen it in order to look at the cervix (first panel). A dilator is used to widen the cervix (middle panel). A curette is put through the cervix into the uterus to scrape out abnormal tissue (last panel).
    Dilatation and curettage (D and C). Three-panel drawing showing a side view of the female reproductive anatomy during a D and C procedure. The first panel shows a speculum widening the opening of the vagina. The cervix, uterus with abnormal tissue, bladder, and rectum are also shown; an inset shows the lower half of a woman covered by a drape on an exam table with her legs apart and her feet in stirrups. The middle panel shows the uterus and a dilator inserted through the vagina into the cervix. The third panel shows a curette scraping out abnormal tissue from the uterus; an inset shows a close up of the curette with the abnormal tissue in it.
  dilate: (DY-layt)
    Pronunciation of dictionary term "dilate"
    To widen or enlarge an opening or hollow structure beyond its usual size, such as the pupil of the eye or a blood vessel.
  dilation and curettage: (dy-LAY-shun … kyoo-reh-TAZH)
    Pronunciation of dictionary term "dilation and curettage"
    A procedure to scrape and remove tissue from the inner lining of the uterus. The cervix is dilated (made larger) and a curette (spoon-shaped instrument) is inserted into the uterus to remove tissue. A tissue sample may then be checked under a microscope for signs of disease, such as infection or cancer. A dilation and curettage may also be done after a miscarriage or to treat certain conditions, such as abnormal bleeding. Also called D&C and dilatation and curettage.
    Dilatation and curettage (D and C). A speculum is inserted into the vagina to widen it in order to look at the cervix (first panel). A dilator is used to widen the cervix (middle panel). A curette is put through the cervix into the uterus to scrape out abnormal tissue (last panel).
    Dilatation and curettage (D and C). Three-panel drawing showing a side view of the female reproductive anatomy during a D and C procedure. The first panel shows a speculum widening the opening of the vagina. The cervix, uterus with abnormal tissue, bladder, and rectum are also shown; an inset shows the lower half of a woman covered by a drape on an exam table with her legs apart and her feet in stirrups. The middle panel shows the uterus and a dilator inserted through the vagina into the cervix. The third panel shows a curette scraping out abnormal tissue from the uterus; an inset shows a close up of the curette with the abnormal tissue in it.
  dilator: (DY-lay-ter)
    Pronunciation of dictionary term "dilator"
    A device used to stretch or enlarge an opening.
  Dilaudid: (dy-LAW-did)
    Pronunciation of dictionary term "Dilaudid"
    A drug used to treat moderate to severe pain. It may also be used to treat certain types of cough. Dilaudid is made from morphine and binds to opioid receptors in the central nervous system. It is a type of opioid and a type of analgesic agent. Also called Exalgo, hydromorphone hydrochloride, and Hydrostat IR.
  dilute: (dy-LOOT)
    Pronunciation of dictionary term "dilute"
    To make something thinner, weaker, less concentrated, or less pure by adding something to it.
  DIM: A substance being studied in the treatment of prostate cancer and in the prevention of cervical cancer. DIM is found in cruciferous vegetables like broccoli, brussels sprouts, cauliflower, cabbage, and kale. It is a type of plant indole. Also called diindolylmethane.
  Dimericine: (dy-MAYR-ih-seen)
    Pronunciation of dictionary term "Dimericine"
    A lotion being studied in the treatment of skin cancer and a skin condition called xeroderma pigmentosum. It has an enzyme contained in very tiny, fat-like particles. The enzyme repairs damage caused by ultraviolet radiation. Dimericine is a type of DNA repair enzyme topical agent. Also called T4N5 liposomal lotion.
  dimesna: (dy-MEZ-nuh)
    Pronunciation of dictionary term "dimesna"
    A drug that belongs to the family of drugs called chemoprotective agents.
  dimethyl sulfoxide: (dy-MEH-thul sul-FOK-side)
    Pronunciation of dictionary term "dimethyl sulfoxide"
    A colorless liquid that readily dissolves many chemicals and penetrates animal and plant tissues. It is used in human medicine, veterinary medicine, and pharmaceuticals.
  dimethylxanthenone acetic acid: (dy-MEH-thul-ZAN-theh-none uh-SEE-tik A-sid)
    Pronunciation of dictionary term "dimethylxanthenone acetic acid"
    An anticancer drug that is a type of angiogenesis inhibitor.
  DIN: A condition in which abnormal cells are found in the lining of a breast duct (milk duct). Having DIN may increase the risk of breast cancer in which these abnormal cells become cancer and spread outside the duct to other tissues in the breast. Types of DIN include atypical ductal hyperplasia and ductal carcinoma in situ (DCIS). Also called ductal intraepithelial neoplasia.
  dinaciclib: (dih-nuh-SY-klib)
    Pronunciation of dictionary term "dinaciclib"
    A substance being studied in the treatment of advanced melanoma (a type of skin cancer) and other types of cancer. It blocks cell division and may cause cancer cells to die. It is a type of cyclin-dependent kinase inhibitor. Also called CDK inhibitor SCH 727965.
  dinutuximab: (din-yoo-TUK-sih-mab)
    Pronunciation of dictionary term "dinutuximab"
    A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF), aldesleukin (IL-2), and 13-cis-retinoic acid to treat children with high-risk neuroblastoma. It is used in patients whose disease has gotten better with other anticancer treatment. Dinutuximab binds to a substance called GD2, which is found on some types of cancer cells. Dinutuximab may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Ch14.18, MOAB Ch14.18, monoclonal antibody Ch14.18, and Unituxin.
    More Information
    - Dinutuximab (https://www.cancer.gov/about-cancer/treatment/drugs/dinutuximab)
  DIPG: A rare, fast-growing tumor that forms in cells called glial cells in a part of the brain stem called the pons. DIPGs tend to spread to nearby tissue and other parts of the brain stem, are hard to treat, and have a poor prognosis (outcome). They usually occur in children. Also called diffuse intrinsic pontine glioma.
    More Information
    - Diffuse Intrinsic Pontine Glioma (DIPG)
    Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.
    Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.
  diphenhydramine: (dy-fen-HY-druh-meen)
    Pronunciation of dictionary term "diphenhydramine"
    A drug used to treat allergies and relieve cough and itching caused by insect bites, sunburn, and poison oak or ivy. It is also used to treat mild Parkinson disease, to prevent and treat motion sickness, to relieve cough and cold symptoms, and as a sleep aid. It is a type of antihistamine.
  diphosphonate: (dy-FOS-foh-nayt)
    Pronunciation of dictionary term "diphosphonate"
    A drug or substance used to treat hypercalcemia (abnormally high blood calcium) and bone pain caused by some types of cancer. Forms of diphosphonates are also used to treat osteoporosis and for bone imaging. Diphosphonates inhibit a type of bone cell that breaks down bone. Also called bisphosphonate.
  diploid: (DIP-loyd)
    Pronunciation of dictionary term "diploid"
    A term that describes a cell or organism with two complete sets of chromosomes. Most human cells, except for egg and sperm cells, are diploid and contain 23 pairs of chromosomes, for a total of 46 chromosomes in each cell.
    More Information
    - Diploid (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Diploid)
  dipyridamole: (DY-pih-RIH-duh-mole)
    Pronunciation of dictionary term "dipyridamole"
    A drug that prevents blood cell clumping and enhances the effectiveness of fluorouracil and other chemotherapeutic agents.
  direct ophthalmoscopy: (duh-REKT OF-thul-MOS-koh-pee)
    Pronunciation of dictionary term "direct ophthalmoscopy"
    An exam of the inside of the back of the eye using an ophthalmoscope (a flashlight-sized instrument with a light source and a set of rotating lenses).
  disability insurance: (dih-suh-BIH-lih-tee in-SHOOR-ents)
    Pronunciation of dictionary term "disability insurance"
    An insurance plan that pays some of a person’s income when he or she is disabled from an illness or injury and cannot work. The two main types of disability insurance are short-term disability (STD) and long-term disability (LTD). STD may last for up to 2 years. LTD usually begins after STD ends and may last for a person’s lifetime.
  discharge: (DIS-charj)
    Pronunciation of dictionary term "discharge"
    In medicine, a fluid that comes out of the body. Discharge can be normal or a sign of disease. Discharge also means release of a patient from care.
  disease: (dih-ZEEZ)
    Pronunciation of dictionary term "disease"
    An abnormal condition that affects the structure or function of part or all of the body and is usually associated with specific signs and symptoms.
  disease progression: (dih-ZEEZ pruh-GREH-shun)
    Pronunciation of dictionary term "disease progression"
    Cancer that continues to grow or spread.
  disease-causing mutation: (dih-ZEEZ-KAW-sing myoo-TAY-shun)
    Pronunciation of dictionary term "disease-causing mutation"
    A change in the DNA sequence of a gene that causes a person to have or be at risk of developing a certain genetic disorder or disease, such as cancer. Disease-causing mutations can be inherited from a parent or occur during a person’s lifetime. Knowing if a person has a disease-causing mutation may help prevent, diagnose, and treat diseases, such as cancer. Not everyone who has a disease-causing mutation will develop the disease. Also called deleterious mutation, pathogenic variant, predisposing mutation, and susceptibility gene mutation.
  disease-free survival: (dih-ZEEZ ... ser-VY-vul)
    Pronunciation of dictionary term "disease-free survival"
    In cancer, the length of time after primary treatment for a cancer ends that the patient survives without any signs or symptoms of that cancer. In a clinical trial, measuring the disease-free survival is one way to see how well a new treatment works. Also called DFS, relapse-free survival, and RFS.
  disease-specific survival rate: (dih-ZEEZ-speh-SIH-fik ser-VY-vul rayt)
    Pronunciation of dictionary term "disease-specific survival rate"
    The percentage of people in a study or treatment group who have not died from a specific disease in a defined period of time. The time period usually begins at the time of diagnosis or at the start of treatment and ends at the time of death. Patients who died from causes other than the disease being studied are not counted in this measurement.
  disinfectant: (DIS-in-fek-tunt)
    Pronunciation of dictionary term "disinfectant"
    Any substance or process that is used primarily on non-living objects to kill germs, such as viruses, bacteria, and other microorganisms that can cause infection and disease. Most disinfectants are harsh chemicals but sometimes heat or radiation may be used.
  disorder: (dis-OR-der)
    Pronunciation of dictionary term "disorder"
    In medicine, an abnormal condition that affects the body's function but may or may not have specific signs and symptoms. A disorder may indicate that a specific disease is present, but there is usually not enough evidence to make a diagnosis. There are many different types of disorders, including physical, mental, emotional, behavioral, genetic, and functional disorders.
  disorientation: (dis-OR-ee-en-TAY-shun)
    Pronunciation of dictionary term "disorientation"
    A mental state marked by confusion about time, place, or who one is.
  disseminate: (dih-SEH-mih-NAYT)
    Pronunciation of dictionary term "disseminate"
    In medicine, disseminate means to scatter or spread widely throughout the body’s tissues or organs. For example, cancer cells can break away from the original (primary) tumor, travel through the blood or lymph system, and disseminate to other organs or tissues in the body.
  distal: (DIS-tul)
    Pronunciation of dictionary term "distal"
    In medicine, refers to a part of the body that is farther away from the center of the body than another part. For example, the fingers are distal to the shoulder. The opposite is proximal.
  distal bile duct cancer: (DIS-tul bile dukt KAN-ser)
    Pronunciation of dictionary term "distal bile duct cancer"
    Cancer that forms in the area where the ducts from the liver and gallbladder join to form the common bile duct, which passes through the pancreas into the small intestine. Bile ducts carry bile from the liver and gallbladder to the small intestine. Distal bile duct cancer is a type of extrahepatic bile duct cancer.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  distal colon: (DIS-tul KOH-lun)
    Pronunciation of dictionary term "distal colon"
    The last part of the colon. The distal colon includes the descending colon (the left side of the colon) and the sigmoid colon (the S-shaped section of the colon that connects to the rectum).
    The distal colon includes the descending colon and the sigmoid colon.
    Distal colon; drawing shows parts of the distal colon, including the descending colon and sigmoid colon.
  distal pancreatectomy: (DIS-tul PAN-kree-uh-TEK-toh-mee)
    Pronunciation of dictionary term "distal pancreatectomy"
    Surgery to remove the body and the tail of the pancreas. The spleen may also be removed. A distal pancreatectomy is usually done to remove benign (not cancer) or malignant (cancer) pancreatic tumors found in the body or tail of the pancreas, but it may also be done to treat chronic pancreatitis and injuries to the pancreas.
    Anatomy of the pancreas. The pancreas has three areas: the head, body, and tail. It is found in the abdomen near the stomach, intestines, and other organs.
    Anatomy of the pancreas; drawing shows the pancreas, stomach, spleen, liver, bile ducts, gallbladder, small intestine, and colon. An inset shows the head, body, and tail of the pancreas. The bile duct and pancreatic duct are also shown.
  distal urethra: (DIS-tul yoo-REE-thruh)
    Pronunciation of dictionary term "distal urethra"
    The part of the urethra closest to the outside of the body. The urethra is the tube through which urine leaves the body. In women, the distal urethra is approximately the last ½ inch, and in men it is the part of the urethra in the penis.
    Anatomy of the distal and proximal urethra. Urine flows out of the bladder and leaves the body through the urethra. The part of the urethra that is closest to the bladder is called the proximal urethra. The part that is closest to where the urine leaves the body is called the distal urethra. The urethra is about 8 inches long in men and about 1½ inches long in women.
    Distal and proximal urethra. Drawing on the left shows the female proximal and distal urethra; also shown are the bladder filled with urine, the ureters, and the uterus. Cross-section drawing on the right shows the male proximal and distal urethra. Also shown are the rectum, prostate gland, penis, and testis.
  distal urethral cancer: (DIS-tul yoo-REE-thrul KAN-ser)
    Pronunciation of dictionary term "distal urethral cancer"
    A rare cancer that forms in the part of the urethra that is closest to the outside of the body. The cancer often has not spread deeply into the tissue.
  distant cancer: (DIS-tunt KAN-ser)
    Pronunciation of dictionary term "distant cancer"
    Refers to cancer that has spread from the original (primary) tumor to distant organs or distant lymph nodes. Also called distant metastasis.
  distant metastasis: (DIS-tunt meh-TAS-tuh-sis)
    Pronunciation of dictionary term "distant metastasis"
    Refers to cancer that has spread from the original (primary) tumor to distant organs or distant lymph nodes. Also called distant cancer.
  distant recurrence: (DIS-tunt ree-KER-ents)
    Pronunciation of dictionary term "distant recurrence"
    Cancer that has recurred (come back) in another part of the body that is far away from where the original (primary) tumor first formed. For example, if breast cancer recurs in the liver, the cancer cells in the liver are breast cancer cells, not liver cancer cells.
  distraction: (dis-TRAK-shun)
    Pronunciation of dictionary term "distraction"
    In medicine, a pain relief method that takes the patient's attention away from the pain.
  distress: (dih-STRES)
    Pronunciation of dictionary term "distress"
    Emotional, social, spiritual, or physical pain or suffering that may cause a person to feel sad, afraid, depressed, anxious, or lonely. People in distress may also feel that they are not able to manage or cope with changes caused by normal life activities or by having a disease, such as cancer. Cancer patients may have trouble coping with their diagnosis, physical symptoms, or treatment.
    More Information
    - Adjustment to Cancer: Anxiety and Distress
  disulfiram: (dy-SUL-fih-ram)
    Pronunciation of dictionary term "disulfiram"
    A drug that slows the metabolism of retinoids, allowing them to act over a longer period of time.
  diuresis: (DY-yoo-REE-sis)
    Pronunciation of dictionary term "diuresis"
    An increase in the amount of urine made by the kidney and passed from the body.
  diuretic: (DY-yoo-REH-tik)
    Pronunciation of dictionary term "diuretic"
    A type of drug that causes the kidneys to make more urine. Diuretics help the body get rid of extra fluid and salt. They are used to treat high blood pressure, edema (extra fluid in the tissues), and other conditions. There are many different types of diuretics. They are sometimes called water pills.
  diversity: (dih-VER-sih-tee)
    Pronunciation of dictionary term "diversity"
    Having people with different physical, social, and personal traits or characteristics in a group or organization. These characteristics may include race, ethnicity, age, gender, sexual identity, religion, physical and mental ability, language, income, and education. Diversity may also include different life experiences, cultural backgrounds, beliefs, and interests in a group. In cancer research, there are efforts being made to increase the diversity of people enrolled in clinical trials so that the trial results represent a wider group of people who would most likely benefit from the treatment or intervention being studied.
  diverticulitis: (DY-ver-TIH-kyoo-LY-tis)
    Pronunciation of dictionary term "diverticulitis"
    Inflammation of one or more pouches or sacs that bulge out from the wall of a hollow organ, such as the colon. Symptoms include muscle spasms and cramps in the abdomen.
  diverticulosis: (DY-ver-TIH-kyoo-LOH-sis)
    Pronunciation of dictionary term "diverticulosis"
    A condition marked by small sacs or pouches in the walls of a hollow organ, such as the colon. These sacs can become inflamed and cause a condition called diverticulitis.
  diverticulum: (DY-ver-TIH-kyoo-lum)
    Pronunciation of dictionary term "diverticulum"
    A small pouch or sac that bulges out from the wall of a hollow organ, such as the colon.
  DJ-927: A substance being studied in the treatment of cancer. It is a type of taxane derivative.
  DKC: A rare, inherited disorder that can affect many parts of the body, especially the nails, skin, and mouth. It is marked by abnormally shaped fingernails and toenails that may grow poorly; changes in skin color, especially on the neck and chest; and white patches inside the mouth. Other problems may include hair loss or early graying of the hair, eye and dental problems, osteoporosis, joint problems, liver disease, and a narrowing of the urethra (tube that carries urine from the bladder to the outside of the body) in men. People with DKC may develop serious conditions, such as bone marrow failure, myelodysplastic syndrome, pulmonary fibrosis, and certain types of cancer, especially leukemia and cancers of the head and neck, mouth, anus, and genitals. DKC may be caused by mutations (changes) in certain genes that affect the length of telomeres (the ends of chromosomes). Also called dyskeratosis congenita.
    More Information
    - Dyskeratosis congenita (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10905/dyskeratosis-congenita)
    - Dyskeratosis congenita (MedlinePlus) (https://medlineplus.gov/genetics/condition/dyskeratosis-congenita/)
  DKC1 gene: (... jeen)
    Pronunciation of dictionary term "DKC1 gene"
    A gene that makes a protein involved in protecting and maintaining telomeres (the ends of chromosomes) and in making a molecule called ribosomal RNA. Mutations (changes) in the DKC1 gene may cause damage to chromosomes and DNA, which may lead to abnormal cell growth. DKC1 gene mutations have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
    More Information
    - DKC1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/dkc1/)
  dMMR: Describes cells that have mutations (changes) in certain genes that are involved in correcting mistakes made when DNA is copied in a cell. dMMR cells usually have many DNA mutations, which may lead to cancer. dMMR is most common in colorectal cancer, other types of gastrointestinal cancer, and endometrial cancer, but it may also be found in cancers of the breast, prostate, bladder, and thyroid and in an inherited disorder called Lynch syndrome. Knowing if a tumor is dMMR may help plan treatment or predict how well the tumor will respond to treatment. Also called deficient DNA mismatch repair, deficient mismatch repair, mismatch repair deficiency, and MMR deficiency.
  DNA: The molecule inside cells that contains the genetic information needed for a person and most other organisms to develop and grow and is passed from one generation to the next. DNA is made up of two strands that twist into the shape of a spiral ladder called a double helix. Each strand has a backbone that is made up of sugar and phosphate molecules that attach to one of four bases: adenine (A), thymine (T), guanine (G), and cytosine (C). The bases pair up with one another (A with T, and G with C) to form chemical bonds, which act like rungs on a ladder. This holds the two strands of DNA together. Also called deoxyribonucleic acid.
    More Information
    - Deoxyribonucleic Acid (DNA) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Deoxyribonucleic-Acid)
    - What is DNA? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/basics/dna/)
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  DNA cross-linking agent: (… KROS-lin-king AY-jent)
    Pronunciation of dictionary term "DNA cross-linking agent"
    A substance that binds DNA nucleotides together and blocks DNA synthesis. In cancer treatment, DNA cross-linking agents may kill cancer cells by damaging their DNA and stopping them from dividing.
  DNA gene-expression microarray: (… jeen-ek-SPREH-shun MY-kroh-uh-RAY)
    Pronunciation of dictionary term "DNA gene-expression microarray"
    A process that allows thousands of pieces of DNA that are fixed to a glass slide to be analyzed at one time. It is used to identify the genes (pieces of DNA) in specific cells or tissue that are actively used to make RNA, which then may be used to make proteins.
  DNA index: (... IN-deks)
    Pronunciation of dictionary term "DNA index"
    In medicine, a measure of the amount of DNA or number of chromosomes in cancer cells compared to that in normal cells. Most human cells, except for egg and sperm cells, normally contain 46 chromosomes (23 pairs) in each cell. Cancer cells that have a DNA index of 1 have about the same amount of DNA or number of chromosomes as normal cells. If the DNA index is more than 1, the cancer cells have a higher-than-normal amount of DNA or extra chromosomes. The DNA index may be used to help plan treatment and estimate prognosis for some types of cancer, such as leukemia and neuroblastoma. Also called DNA ploidy.
  DNA intercalating agent: (…in-TER-kuh-LAY-ting AY-jent)
    Pronunciation of dictionary term "DNA intercalating agent"
    A substance that inserts itself into the DNA structure of a cell and binds to the DNA. This causes DNA damage. In cancer treatment, DNA intercalating agents may kill cancer cells by damaging their DNA and stopping them from dividing.
  DNA methylase: (… MEH-thih-LAYS)
    Pronunciation of dictionary term "DNA methylase"
    An enzyme (a protein that speeds up chemical reactions in the body) that attaches methyl groups to DNA. A methyl group is a chemical group containing one carbon and three hydrogen atoms. Also called DNA methyltransferase.
  DNA methyltransferase: (... MEH-thul-TRANZ-feh-rays)
    Pronunciation of dictionary term "DNA methyltransferase"
    An enzyme (a protein that speeds up chemical reactions in the body) that attaches methyl groups to DNA. A methyl group is a chemical group containing one carbon and three hydrogen atoms. Also called DNA methylase.
  DNA ploidy: (… PLOY-dee)
    Pronunciation of dictionary term "DNA ploidy"
    In medicine, a measure of the amount of DNA or number of chromosomes in cancer cells compared to that in normal cells. Most human cells, except for egg and sperm cells, normally contain 46 chromosomes (23 pairs) in each cell. Cancer cells that have a DNA ploidy of 1 have about the same amount of DNA or number of chromosomes as normal cells. If the DNA ploidy is more than 1, the cancer cells have a higher-than-normal amount of DNA or extra chromosomes. The DNA ploidy may be used to help plan treatment and estimate prognosis for some types of cancer, such as leukemia and neuroblastoma. Also called DNA index.
  DNA repair deficiency syndrome: (… reh-PAYR deh-FIH-shun-see SIN-drome)
    Pronunciation of dictionary term "DNA repair deficiency syndrome"
    A type of inherited disorder caused by mutations (changes) in certain genes involved in DNA repair. Changes in these genes can cause breaks, rearrangements, and other problems in the DNA. There are many different types of DNA repair deficiency syndromes. Most of these syndromes are marked by growth and developmental problems, premature aging, and disorders of the skin and nervous system. Having a DNA repair deficiency syndrome may increase a person’s risk of certain types of cancer. Also called DNA repair disorder.
  DNA repair disorder: (… reh-PAYR dis-OR-der)
    Pronunciation of dictionary term "DNA repair disorder"
    A type of inherited disorder caused by mutations (changes) in certain genes involved in DNA repair. Changes in these genes can cause breaks, rearrangements, and other problems in the DNA. There are many different types of DNA repair disorders. Most of these disorders are marked by growth and developmental problems, premature aging, and disorders of the skin and nervous system. Having a DNA repair disorder may increase a person’s risk of certain types of cancer. Also called DNA repair deficiency syndrome.
  DNA replication: (… reh-plih-KAY-shun)
    Pronunciation of dictionary term "DNA replication"
    The process by which a copy of the DNA in a cell is made before the cell divides.
  DNA sequencing: (… SEE-kwen-sing)
    Pronunciation of dictionary term "DNA sequencing"
    A laboratory process used to learn the exact sequence (order) of the four building blocks, or bases, that make up DNA. Information is stored in DNA in a code made by arranging the four bases (identified by the letters A, C, G, and T) in different orders. DNA sequencing can be used to find DNA mutations (changes) that may cause diseases, such as cancer.
    More Information
    - DNA Sequencing (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/DNA-Sequencing?id=51)
  DNR order: (… OR-der)
    Pronunciation of dictionary term "DNR order"
    A legal document in which a person or their proxy (such as a spouse, relative, friend, or lawyer) states that health care providers should not use cardiopulmonary resuscitation (CPR) if that person’s heart or breathing stops. CPR is a life-saving procedure used to try to restart the heart and breathing after one or both have stopped. A DNR order is a decision only about CPR. It does not affect other treatments that may be used to help keep a person alive, such as medicine, food, or fluids. A DNR order may be included as part of an advance directive, such as a living will. Also called do not resuscitate order.
  do not resuscitate order: (… ree-SUH-sih-TAYT OR-der)
    Pronunciation of dictionary term "do not resuscitate order"
    A legal document in which a person or their proxy (such as a spouse, relative, friend, or lawyer) states that health care providers should not use cardiopulmonary resuscitation (CPR) if that person’s heart or breathing stops. CPR is a life-saving procedure used to try to restart the heart and breathing after one or both have stopped. A do not resuscitate order is a decision only about CPR. It does not affect other treatments that may be used to help keep a person alive, such as medicine, food, or fluids. A do not resuscitate order may be included as part of an advance directive, such as a living will. Also called DNR order.
  docetaxel: (DOH-seh-TAK-sil)
    Pronunciation of dictionary term "docetaxel"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, gastroesophageal junction cancer, non-small cell lung cancer, prostate cancer, and squamous cell carcinoma of the head and neck. It is also being studied in the treatment of other types of cancer. Docetaxel stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called Taxotere.
    More Information
    - Docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel)
  docetaxel-cisplatin-fluorouracil: (DOH-seh-TAK-sil-sis-PLA-tin-floor-oh-YOOR-uh-sil)
    Pronunciation of dictionary term "docetaxel-cisplatin-fluorouracil"
    A chemotherapy combination used to treat certain types of head and neck cancer and stomach cancer. It includes the drugs docetaxel (Taxotere), cisplatin (Platinol), and fluorouracil. Also called DCF, Taxotere-Platinol-fluorouracil, TPF, and TPF regimen.
    More Information
    - TPF (https://www.cancer.gov/about-cancer/treatment/drugs/TPF)
  dock: (dok)
    Pronunciation of dictionary term "dock"
    A plant that has been used in some cultures to treat certain medical problems. It may have anticancer effects. The scientific name is Rumex acetosella. Also called sheep sorrel and sorrel.
  DOI: A procedure that uses light waves to create 2-dimensional (2-D) or 3-dimensional (3-D) pictures of tissues inside the body. DOI may be used to look at blood flow to the tissues and to measure changes in the amount of oxygen in them. This may help show the difference between normal and abnormal tissue. DOI may be especially useful for looking at soft tissue, such as breast and brain tissue. It is being studied as an imaging test to help diagnose early-stage breast cancer and other conditions. Also called diffuse optical imaging.
  dolasetron mesylate: (doh-LAH-seh-tron MEH-zih-layt)
    Pronunciation of dictionary term "dolasetron mesylate"
    A drug used to prevent nausea and vomiting caused by chemotherapy. Dolasetron mesylate blocks the action of the chemical serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Dolasetron mesylate is a type of serotonin receptor antagonist and a type of antiemetic.
  dolastatin 10: (DOH-luh-STA-tin …)
    Pronunciation of dictionary term "dolastatin 10"
    A substance being studied in the treatment of cancer. It binds to a protein that cells need to divide and it may kill cancer cells. Dolastatin 10 comes from a marine organism. It is a type of mitotic inhibitor.
  donepezil: (doh-NEH-peh-zil)
    Pronunciation of dictionary term "donepezil"
    A drug that is used to treat Alzheimer disease and is being studied in the treatment of side effects caused by radiation therapy to the brain. It is a type of cholinesterase inhibitor.
  dong quai: (dong kwye)
    Pronunciation of dictionary term "dong quai"
    An herb native to China. A substance taken from the roots has been used in traditional Chinese medicine to treat menstrual and menopausal problems. Dong quai may increase the effect of the drug warfarin (a blood-thinner). The scientific name is Angelica sinensis.
  donor: (DOH-ner)
    Pronunciation of dictionary term "donor"
    In medicine, a person who gives blood, cells, tissue, or an organ for use in another person, such as in a blood transfusion or an organ transplant.
  donor lymphocyte infusion: (DOH-ner LIM-foh-site in-FYOO-zhun)
    Pronunciation of dictionary term "donor lymphocyte infusion"
    A type of therapy in which lymphocytes from the blood of a donor are given to a patient who has already received a stem cell transplant from the same donor. The donor lymphocytes may kill remaining cancer cells. Donor lymphocyte infusion is used to treat chronic myelogenous leukemia (CML) that has come back and myeloma. It is being studied in the treatment of other types of cancer.
    Donor lymphocyte infusion. Lymphocytes (a type of white blood cell) from the blood of a donor are given to a patient. (Panel 1): Blood is taken from a vein in the donor’s arm. The blood flows through an apheresis machine that removes the lymphocytes. The blood is then returned to the donor through a vein in the other arm. (Panel 2): The patient receives the lymphocytes through a catheter in the chest.
    Donor lymphocyte infusion; (Panel 1): Drawing of lymphocytes being removed from a donor. Blood is taken from a vein in the donor's arm and flows through an apheresis machine that removes the lymphocytes. The blood is then returned to the donor through a vein in the other arm. (Panel 2): Drawing of lymphocytes being given to a patient through a catheter in the chest.
  dornase alfa inhalation solution: (DOR-nays AL-fuh in-huh-LAY-shun suh-LOO-shun)
    Pronunciation of dictionary term "dornase alfa inhalation solution"
    A drug given in an aerosol mist to decrease the thickness of mucus in the lungs of patients with cystic fibrosis. It is also being studied as a treatment to reduce the thickness of saliva in patients being treated for head and neck cancer. Dornase alfa inhalation solution contains an enzyme that breaks the DNA in mucus into small pieces and makes the mucus thinner. Also called Pulmozyme.
  dose: (dose)
    Pronunciation of dictionary term "dose"
    The amount of medicine taken, or radiation given, at one time.
  dose-adjusted EPOCH-R: (… uh-JUS-ted …)
    Pronunciation of dictionary term "dose-adjusted EPOCH-R"
    An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), and rituximab. During each treatment cycle, the doses of some of the drugs may be increased or decreased to allow the patient to receive the dose that works the best with the fewest side effects. Also called DA-EPOCH-R, DA-EPOCH-R regimen, and dose-adjusted EPOCH-R regimen.
  dose-adjusted EPOCH-R regimen: (… uh-JUS-ted … REH-jih-men)
    Pronunciation of dictionary term "dose-adjusted EPOCH-R regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), and rituximab. During each treatment cycle, the doses of some of the drugs may be increased or decreased to allow the patient to receive the dose that works the best with the fewest side effects. Also called DA-EPOCH-R, DA-EPOCH-R regimen, and dose-adjusted EPOCH-R.
  dose-dense chemotherapy: (dose-dents KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "dose-dense chemotherapy"
    A chemotherapy treatment plan in which drugs are given with less time between treatments than in a standard chemotherapy treatment plan.
  dose-dependent: (dose-deh-PEN-dent)
    Pronunciation of dictionary term "dose-dependent"
    Refers to the effects of treatment with a drug. If the effects change when the dose of the drug is changed, the effects are said to be dose-dependent.
  dose-escalation study: (dose-EH-skuh-LAY-shun STUH-dee)
    Pronunciation of dictionary term "dose-escalation study"
    A study that determines the best dose of a new drug or treatment. In a dose-escalation study, the dose of the test drug is increased a little at a time in different groups of people until the highest dose that does not cause harmful side effects is found. A dose-escalation study may also measure ways that the drug is used by the body and is often done as part of a phase I clinical trial. These trials usually include a small number of patients and may include healthy volunteers.
  dose-limiting: (dose-LIH-mih-ting)
    Pronunciation of dictionary term "dose-limiting"
    Describes side effects of a drug or other treatment that are serious enough to prevent an increase in dose or level of that treatment.
  dose-rate: (dose-rayt)
    Pronunciation of dictionary term "dose-rate"
    The strength of a treatment given over a period of time.
  dosimetrist: (doh-SIH-meh-trist)
    Pronunciation of dictionary term "dosimetrist"
    A person who determines the proper radiation dose for treatment.
  dosimetry: (doh-SIH-meh-tree)
    Pronunciation of dictionary term "dosimetry"
    Measurement of radiation exposure from x-rays, gamma rays, or other types of radiation used in the treatment or detection of diseases, including cancer.
  dostarlimab: (dos-TAR-lih-mab)
    Pronunciation of dictionary term "dostarlimab"
    A drug used alone or with other drugs to treat adults with certain types of endometrial cancer or other solid tumors that have come back or are advanced. These include cancers that have certain mutations (changes) in genes involved in DNA repair. It is also being studied in the treatment of other types of cancer. Dostarlimab binds to a protein called PD-1, which is found on T cells (a type of immune cell). Dostarlimab may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Jemperli.
    More Information
    - Dostarlimab-gxly (https://www.cancer.gov/about-cancer/treatment/drugs/dostarlimab-gxly)
  DOT: A procedure that uses light waves to create 3-dimensional (3-D) pictures of tissues inside the body. The pictures are created by a computer linked to the light source. DOT may be used to look at blood flow to the tissues and to measure changes in the amount of oxygen in them. This may help show the difference between normal and abnormal tissue. DOT may be especially useful for looking at soft tissue, such as breast and brain tissue. It is being studied as an imaging test to help diagnose early-stage breast cancer and other conditions. Also called diffuse optical tomography.
  double autologous transplant: (DUH-bul aw-TAH-luh-gus TRANZ-plant)
    Pronunciation of dictionary term "double autologous transplant"
    A type of transplant in which a patient receives two courses of high-dose chemotherapy, each course followed by an infusion of their own healthy blood-forming stem cells. The stem cells are collected and stored before the first high-dose chemotherapy treatment. The treatments are given weeks or months apart but are usually completed within a 6-month period. A double autologous transplant is used to treat certain types of cancer, such as neuroblastoma and multiple myeloma. Also called tandem transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  double balloon endoscopy: (DUH-bul buh-LOON en-DOS-koh-pee)
    Pronunciation of dictionary term "double balloon endoscopy"
    A procedure used to look at the inside of the small intestine. A special instrument made up of two tubes (one inside the other) is inserted through the mouth or rectum and into the small intestine. The inside tube, which is an endoscope with a light and lens for viewing, is moved through part of the small intestine, and a balloon at the end of it is inflated to keep the endoscope in place. Next, the outer tube is moved through the small intestine to reach the end of the endoscope, and a balloon at the end of the outer tube is inflated to keep it in place. Then, the balloon at the end of the endoscope is deflated, and the endoscope is moved through the next part of the small intestine. These steps are repeated many times as the tubes move through the whole small intestine. This allows the doctor to see all of the small intestine. Tissue samples may be removed so they can be checked under a microscope for signs of disease. Also called DBE and double balloon enteroscopy.
  double balloon enteroscopy: (DUH-bul buh-LOON en-teh-ROS-koh-pee)
    Pronunciation of dictionary term "double balloon enteroscopy"
    A procedure used to look at the inside of the small intestine. A special instrument made up of two tubes (one inside the other) is inserted through the mouth or rectum and into the small intestine. The inside tube, which is an endoscope with a light and lens for viewing, is moved through part of the small intestine, and a balloon at the end of it is inflated to keep the endoscope in place. Next, the outer tube is moved through the small intestine to reach the end of the endoscope, and a balloon at the end of the outer tube is inflated to keep it in place. Then, the balloon at the end of the endoscope is deflated, and the endoscope is moved through the next part of the small intestine. These steps are repeated many times as the tubes move through the whole small intestine. This allows the doctor to see all of the small intestine. Tissue samples may be removed so they can be checked under a microscope for signs of disease. Also called DBE and double balloon endoscopy.
  double-blind study: (DUH-bul-blind STUH-dee)
    Pronunciation of dictionary term "double-blind study"
    A type of clinical trial in which neither the participants nor the researcher knows which treatment or intervention participants are receiving until the clinical trial is over. This makes results of the study less likely to be biased. This means that the results are less likely to be affected by factors that are not related to the treatment or intervention being tested.
  double-contrast barium enema: (DUH-bul-KON-trast BAYR-ee-um EH-neh-muh)
    Pronunciation of dictionary term "double-contrast barium enema"
    A procedure in which x-rays of the colon and rectum are taken after a liquid containing barium is put into the rectum. Barium is a silver-white metallic compound that outlines the colon and rectum on an x-ray and helps show abnormalities. Air is put into the rectum and colon to further enhance the x-ray.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  double-hit lymphoma: (DUH-bul-hit lim-FOH-muh)
    Pronunciation of dictionary term "double-hit lymphoma"
    A rare, aggressive (fast-growing) type of B-cell non-Hodgkin lymphoma caused by changes in the DNA that affect a gene called the MYC gene and either the BCL2 gene or the BCL6 gene. Double-hit lymphoma may be hard to treat and has a poor prognosis. It is a type of diffuse large B-cell lymphoma. Also called DHL.
  doubling time: (DUH-bling...)
    Pronunciation of dictionary term "doubling time"
    In biology, the amount of time it takes for one cell to divide or for a group of cells (such as a tumor) to double in size. The doubling time is different for different kinds of cancer cells or tumors.
  douche: (doosh)
    Pronunciation of dictionary term "douche"
    A procedure in which the vagina is washed with water or a cleansing solution. Most cleansing solutions contain water mixed with vinegar, baking soda, or iodine. Regular douching can wash away some of the bacteria that normally live in the vagina. This may allow yeast or harmful types of bacteria to grow and cause infection. Douching may also cause other health problems, such as pelvic inflammatory disease (PID) and problems during pregnancy. Most doctors do not recommend douching.
  Down syndrome: (...SIN-drome)
    Pronunciation of dictionary term "Down syndrome"
    A genetic condition caused by having an extra chromosome 21 in some or all of the body’s cells. Down syndrome is marked by growth, developmental, and learning delays that vary from mild to severe. People with Down syndrome often have certain distinct physical features, such as a shorter-than-normal height, a flat face with a short nose, eyes that are slanted and almond-shaped, small ears, a short neck, a tongue that tends to stick out of the mouth, small hands and feet, and a deep line that goes across the palm of the hand. People with Down syndrome may also have muscle weakness, loose joints, heart defects, and other health problems. Having Down syndrome increases the risk of developing Alzheimer disease at an early age, usually around the age of 50, and leukemia, especially in young children. Down syndrome is usually not inherited (passed from parent to child). Also called trisomy 21.
    More Information
    - Down syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10247/down-syndrome)
    - Down syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/down-syndrome/)
  downstaging: (…STAY-jing)
    Pronunciation of dictionary term "downstaging"
    In cancer, changing the stage used to describe the extent of cancer in the body from a higher stage (indicating more extensive disease) to a lower stage (indicating less extensive disease). Staging is usually based on the size of the tumor and whether the cancer has spread. Downstaging may occur as a result of treatment that shrinks a tumor so it can be removed by surgery that otherwise could not have been done.
  Dox-SL: A form of the anticancer drug doxorubicin that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than doxorubicin. Dox-SL is used to treat ovarian cancer, AIDS-related Kaposi sarcoma, and multiple myeloma in patients whose disease has not gotten better after treatment with other anticancer drugs. It may be used together with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Dox-SL is a type of anthracycline antitumor antibiotic. Also called Doxil, doxorubicin hydrochloride liposome, Evacet, LipoDox, and liposomal doxorubicin hydrochloride.
    More Information
    - Doxorubicin Hydrochloride Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicin-hydrochloride-liposome)
  doxazosin: (dok-SAY-zoh-sin)
    Pronunciation of dictionary term "doxazosin"
    A drug used to treat high blood pressure and urinary problems caused by an enlarged prostate. It relaxes muscle tissue in blood vessels and in the prostate. Doxazosin is a type of alpha blocker. Also called Cardura and doxazosin mesylate.
  doxazosin mesylate: (dok-SAY-zoh-sin MEH-zih-layt)
    Pronunciation of dictionary term "doxazosin mesylate"
    A drug used to treat high blood pressure and urinary problems caused by an enlarged prostate. It relaxes muscle tissue in blood vessels and in the prostate. Doxazosin mesylate is a type of alpha blocker. Also called Cardura.
  doxercalciferol: (DOK-ser-kal-SIH-feh-rol)
    Pronunciation of dictionary term "doxercalciferol"
    A substance being studied in the prevention of recurrent prostate cancer. It is a type of vitamin D analog.
  Doxil: (DOK-sil)
    Pronunciation of dictionary term "Doxil"
    A form of the anticancer drug doxorubicin that is contained inside very tiny, fat-like particles and is used alone or with other drugs to treat certain types of ovarian cancer, AIDS-related Kaposi sarcoma, and multiple myeloma. Doxil may have fewer side effects and work better than other forms of doxorubicin hydrochloride. It is also being studied in the treatment of other types of cancer. Doxil is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called doxorubicin hydrochloride liposome and liposomal doxorubicin hydrochloride.
    More Information
    - Doxorubicin Hydrochloride Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicin-hydrochloride-liposome)
  doxorubicin: (DOK-soh-ROO-bih-sin)
    Pronunciation of dictionary term "doxorubicin"
    A drug used to treat many types of cancer, including leukemia, lymphoma, neuroblastoma, sarcoma, Wilms tumor, and cancers of the lung, breast, stomach, ovary, thyroid, and bladder. It is also being studied in the treatment of other types of cancer. Doxorubicin comes from the bacterium Streptomyces peucetius. It damages DNA and may kill cancer cells. It is a type of anthracycline antitumor antibiotic. The brand names Adriamycin PFS, Adriamycin RDF, and Rubex have been taken off the market and are no longer available. Also called doxorubicin hydrochloride and hydroxydaunorubicin.
    More Information
    - Doxorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
  doxorubicin hydrochloride: (DOK-soh-ROO-bih-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "doxorubicin hydrochloride"
    A drug that comes from the bacterium Streptomyces peucetius and is used alone or with other drugs to treat many types of cancer, including leukemia, lymphoma, neuroblastoma, sarcoma, Wilms tumor, and certain cancers of the lung, breast, stomach, ovary, thyroid, and bladder. It is also being studied in the treatment of other types of cancer. Doxorubicin hydrochloride damages the cell’s DNA and may kill cancer cells. It also blocks a certain enzyme needed for cell division and DNA repair. Doxorubicin hydrochloride is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Doxorubicin is the active ingredient of doxorubicin hydrochloride. Also called Adriamycin and hydroxydaunorubicin.
    More Information
    - Doxorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
  doxorubicin hydrochloride liposome: (DOK-soh-ROO-bih-sin HY-droh-KLOR-ide LY-poh-some)
    Pronunciation of dictionary term "doxorubicin hydrochloride liposome"
    A form of the anticancer drug doxorubicin that is contained inside very tiny, fat-like particles and is used alone or with other drugs to treat certain types of ovarian cancer, AIDS-related Kaposi sarcoma, and multiple myeloma. Doxorubicin hydrochloride liposome may have fewer side effects and work better than other forms of doxorubicin hydrochloride. It is also being studied in the treatment of other types of cancer. Doxorubicin hydrochloride liposome is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called Doxil and liposomal doxorubicin hydrochloride.
    More Information
    - Doxorubicin Hydrochloride Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicin-hydrochloride-liposome)
  doxycycline: (DOK-suh-SY-kleen)
    Pronunciation of dictionary term "doxycycline"
    A drug used to treat many types of bacterial infections. It stops the growth of bacteria by keeping them from making proteins. It is a type of antibiotic. Also called doxycycline hyclate.
  doxycycline hyclate: (DOK-suh-SY-kleen HY-klayt)
    Pronunciation of dictionary term "doxycycline hyclate"
    A drug used to treat many types of bacterial infections. It stops the growth of bacteria by keeping them from making proteins. It is a type of antibiotic.
  DPA: A legal document that gives one person (such as a spouse, relative, friend, or lawyer) the authority to make medical, legal, or financial decisions for another person. A DPA may go into effect right away or when the person who grants it is no longer able to make decisions for themself, depending on how it is written. In most cases, a DPA remains in effect until the person who grants it dies or cancels it. It does not need to be renewed over time. Also called durable power of attorney.
  DPPE: Belongs to a group of antihormone drugs.
  DR4: A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of DR4 on cancer cells may kill more cells. Also called death receptor 4, TRAIL receptor 1, TRAIL-R1, and tumor necrosis factor receptor superfamily member 10A.
  DR5: A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of DR5 on cancer cells may kill more cells. Also called death receptor 5, TRAIL receptor 2, TRAIL-R2, and tumor necrosis factor receptor superfamily member 10B.
  drain: (drayn)
    Pronunciation of dictionary term "drain"
    In medicine, to remove fluid as it collects; or, a tube or wick-like device used to remove fluid from a body cavity, wound, or infected area.
  DRE: An examination in which a doctor inserts a lubricated, gloved finger into the rectum to feel for abnormalities. Also called digital rectal examination.
    Digital rectal exam (DRE). The doctor inserts a gloved, lubricated finger into the rectum and feels the rectum, anus, and prostate (in males) to check for anything abnormal.
    Digital rectal exam; drawing shows a side view of the male reproductive anatomy and the urinary anatomy, including the prostate, rectum, and bladder. Also shown is a gloved, lubricated finger inserted into the rectum to feel the rectum, anus, and prostate.
  drenching night sweats: (DREN-ching …)
    Pronunciation of dictionary term "drenching night sweats"
    Episodes of excessive sweating that occur during sleep and soak a person’s bedclothes and bed sheets, which may cause the person to wake up. Drenching night sweats that do not go away and occur with other signs and symptoms, such as fever, weight loss, and fatigue, may be a symptom of some types of cancer, including leukemia and lymphoma. Not all people who have drenching night sweats have cancer.
  DRI: A set of guidelines developed by U.S. and Canadian scientists to give information about the role of nutrients in human health. These guidelines include the Reference Daily Intakes (RDI), which are the recommended amounts of nutrients to be eaten each day to meet the needs of most healthy people. This system replaced the Recommended Dietary Allowances (RDA). Also called Dietary Reference Intakes.
  driver mutation: (DRI-ver myoo-TAY-shun)
    Pronunciation of dictionary term "driver mutation"
    A term used to describe changes in the DNA sequence of genes that cause cells to become cancer cells and grow and spread in the body. Checking tumor tissue for driver mutations may help plan treatment to stop cancer cells from growing, including drugs that target a specific mutation.
  dronabinol: (droh-NA-bih-nol)
    Pronunciation of dictionary term "dronabinol"
    A synthetic pill form of delta-9-tetrahydrocannabinol (THC), an active ingredient in marijuana that is used to treat nausea and vomiting associated with cancer chemotherapy.
  droperidol: (droh-PAYR-ih-dol)
    Pronunciation of dictionary term "droperidol"
    A drug used to prevent nausea and vomiting in patients who receive anesthesia before surgery. It is also used to treat anxiety. Droperidol is a type of antiemetic, adjunct anesthesia, and antipsychotic.
  dropouts: (DRAHP-owts)
    Pronunciation of dictionary term "dropouts"
    In a clinical trial, the withdrawal of participation prior to the occurrence of the primary endpoint. Dropouts are a key source of missing data.
  Droxia: (DROK-see-uh)
    Pronunciation of dictionary term "Droxia"
    A drug that contains the active ingredient hydroxyurea and is used to treat certain patients with sickle cell anemia. It is also being studied in the treatment of other conditions and some types of cancer. Droxia may help keep abnormal red blood cells from forming, which may reduce the number of painful sickle cell crises and the need for blood transfusions. It is a type of antimetabolite.
    More Information
    - Hydroxyurea (https://www.cancer.gov/about-cancer/treatment/drugs/hydroxyurea)
  drug: (drug)
    Pronunciation of dictionary term "drug"
    Any substance (other than food) that is used to prevent, diagnose, treat, or relieve symptoms of a disease or abnormal condition. Drugs can also affect how the brain and the rest of the body work and cause changes in mood, awareness, thoughts, feelings, or behavior. Some types of drugs, such as opioids, may be abused or lead to addiction.
    More Information
    - A to Z List of Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs)
  drug abuse: (...uh-BYOOS)
    Pronunciation of dictionary term "drug abuse"
    The use of illegal drugs or the use of prescription or over-the-counter drugs for purposes other than those for which they are meant to be used, or in excessive amounts. Drug abuse may lead to social, physical, emotional, and job-related problems.
  Drug Accountability Record: (… uh-KOWN-tuh-BIH-lih-tee REH-kurd)
    Pronunciation of dictionary term "Drug Accountability Record"
    A log of study drugs kept by an investigator running a clinical trial. It lists many things about each drug, including the drug name, lot number, expiration date, the amount of drug received, used, returned, or thrown away, and the amount left. Drug Accountability Records help make sure that a clinical trial is done safely and correctly. Drug Accountability Records are required by the U.S. Food and Drug Administration (FDA). Also called DAR.
  drug interaction: (… IN-teh-RAK-shun)
    Pronunciation of dictionary term "drug interaction"
    A change in the way a drug acts in the body when taken with certain other drugs, herbals, or foods, or when taken with certain medical conditions. Drug interactions may cause the drug to be more or less effective, or cause effects on the body that are not expected.
  drug product: (… PRAH-dukt)
    Pronunciation of dictionary term "drug product"
    A dosage form that contains one or more active and/or inactive ingredients. Drug products come in many dosage forms, including tablets, capsules, liquids, creams, and patches. They can also be given in different ways, such as by mouth, by infusion into a vein, or by drops that are put into the ear or eye. The form with the active ingredient is used to prevent, diagnose, treat, or relieve symptoms of a disease or abnormal condition. A drug product that does not contain an active ingredient and is used in research studies is called a placebo. Also called medication.
  drug resistance: (... reh-ZIH-stunts)
    Pronunciation of dictionary term "drug resistance"
    When cancer cells or microorganisms, such as bacteria or viruses, don’t respond to a drug that is usually able to kill or weaken them. Drug resistance may be present before treatment is given or may occur during or after treatment with the drug. In cancer treatment, there are many things that may cause resistance to anticancer drugs. For example, DNA changes or other genetic changes may change the way the drug gets into the cancer cells or the way the drug is broken down within the cancer cells. Drug resistance can lead to cancer treatment not working or to the cancer coming back.
  drug substance: (… SUB-stunts)
    Pronunciation of dictionary term "drug substance"
    The main ingredient in a medicine that causes the desired effect of the medicine. Some medicines contain more than one drug substance that act in different ways in the body. Also called active pharmaceutical ingredient, API, and pharmacologic substance.
  drug therapy: (… THAYR-uh-pee)
    Pronunciation of dictionary term "drug therapy"
    Treatment with any substance, other than food, that is used to prevent, diagnose, treat, or relieve symptoms of a disease or abnormal condition.
  drug tolerance: (... TAH-leh-runts)
    Pronunciation of dictionary term "drug tolerance"
    A condition that occurs when the body gets used to a medicine so that either more medicine is needed or different medicine is needed.
  dry orgasm: (dry OR-ga-zum)
    Pronunciation of dictionary term "dry orgasm"
    Sexual climax without the release of semen from the penis.
  DSMB: Data and Safety Monitoring Board. An impartial group that oversees a clinical trial and reviews the results to see if they are acceptable. This group determines if the trial should be changed or closed. Also called Data and Safety Monitoring Board.
  DT2219ARL immunotoxin: (… IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "DT2219ARL immunotoxin"
    A substance being studied in the treatment of some types of B-cell cancer. It contains an antibody linked to a toxic substance. The antibody binds to proteins called CD19 and CD22 on the surface of B cells, and the toxic substance kills the cells. It is a type of bispecific ligand-directed toxin.
  DT388IL3 fusion protein: (...FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "DT388IL3 fusion protein"
    A substance being studied in the treatment of myeloid leukemia (a disease in which too many immature non-lymphocyte white blood cells are found in the blood and bone marrow). DT388IL3 fusion protein is made by combining IL-3 with a toxic substance. The IL-3 attaches to the cancer cells and the toxic substance kills them.
  DTGM fusion protein: (... FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "DTGM fusion protein"
    An anticancer drug formed by the combination of diphtheria toxin and a colony-stimulating factor (GM-CSF). The colony-stimulating factor is attracted to cancer cells, and the diphtheria toxin kills the cells.
  DTH: An inflammatory response that develops 24 to 72 hours after exposure to an antigen that the immune system recognizes as foreign. This type of immune response involves mainly T cells rather than antibodies (which are made by B cells). Also called delayed-type hypersensitivity response.
  DTIC-Dome: A drug used to treat Hodgkin lymphoma and malignant melanoma. It is also being studied in the treatment of other types of cancer. DTIC-Dome attaches to DNA in cells and may kill cancer cells. It is a type of alkylating agent. Also called dacarbazine.
  DU 145: A cell line made from human prostate cancer cells that is used in the laboratory to study the way prostate cancer cells grow.
  dual energy x-ray absorptiometric scan: (... ub-SORP-shee-uh-MEH-trik skan)
    Pronunciation of dictionary term "dual energy x-ray absorptiometric scan"
    An imaging test that measures bone density (the amount of bone mineral contained in a certain volume of bone) by passing x-rays with two different energy levels through the bone. It is used to diagnose osteoporosis (decrease in bone mass and density). Also called BMD scan, bone mineral density scan, DEXA, DEXA scan, dual x-ray absorptiometry, and DXA.
  dual energy x-ray absorptiometry: (... EH-ner-jee ... ub-SORP-shee-AH-meh-tree)
    Pronunciation of dictionary term "dual energy x-ray absorptiometry"
    A procedure that measures the amount of calcium and other minerals in a bone by passing x-rays with two different energy levels through the bone. A dual energy x-ray absorptiometry shows the strength and thickness of a bone and is usually done in the lower spine, hip, lower arm, wrist, fingers, and heel. It is used to diagnose osteoporosis (a condition of lower bone density), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. A dual energy x-ray absorptiometry also measures fat and muscle composition in specific parts of the body, such as the arms, legs, and pelvis. Also called BMD scan, bone densitometry, bone mineral density scan, DEXA scan, and DXA.
  duct: (dukt)
    Pronunciation of dictionary term "duct"
    In medicine, a tube or vessel of the body through which fluids pass.
  ductal carcinoma: (DUK-tul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "ductal carcinoma"
    The most common type of breast cancer. It begins in the lining of the milk ducts (thin tubes that carry milk from the lobules of the breast to the nipple). Ductal carcinoma may be either ductal carcinoma in situ (DCIS) or invasive ductal carcinoma. DCIS is a noninvasive condition in which abnormal cells are found in the lining of a breast duct and have not spread outside the duct to other tissues in the breast. In some cases, DCIS may become invasive cancer. In invasive ductal carcinoma, cancer has spread outside the breast duct to surrounding normal tissue. It can also spread through the blood and lymph systems to other parts of the body.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
  ductal carcinoma in situ: (DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "ductal carcinoma in situ"
    A condition in which abnormal cells are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. In some cases, ductal carcinoma in situ may become invasive breast cancer and spread to other tissues. At this time, there is no way to know which abnormal cells could become invasive. Also called DCIS and intraductal breast carcinoma.
    Ductal carcinoma in situ (DCIS). Abnormal cells are found in the lining of a breast duct.
    Ductal carcinoma in situ (DCIS); drawing shows a lobe, ducts, and fatty tissue in a cross section of the breast. The inset shows a normal duct and a duct with abnormal cells.
  ductal intraepithelial neoplasia: (DUK-tul IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "ductal intraepithelial neoplasia"
    A condition in which abnormal cells are found in the lining of a breast duct (milk duct). Having ductal intraepithelial neoplasia may increase the risk of breast cancer in which these abnormal cells become cancer and spread outside the duct to other tissues in the breast. Types of ductal intraepithelial neoplasia include atypical ductal hyperplasia and ductal carcinoma in situ (DCIS). Also called DIN.
  ductal lavage: (DUK-tul luh-VAZH)
    Pronunciation of dictionary term "ductal lavage"
    A method used to collect cells from milk ducts in the breast. A hair-size catheter (tube) is inserted into the nipple, and a small amount of salt water is released into the duct. The water picks up breast cells, and is removed. The cells are checked under a microscope. Ductal lavage may be used in addition to clinical breast examination and mammography to detect breast cancer.
  ductography: (duk-TAH-gruh-fee)
    Pronunciation of dictionary term "ductography"
    A procedure that uses x-rays to create pictures of milk ducts in the breast. A very thin catheter (tube) is inserted into the nipple, and a small amount of dye is injected into the duct. This makes the duct easier to see on the x-ray. Ductography is used in patients who have a bloody or clear discharge from one nipple. A small amount of the fluid may be collected to check for infection or cancer cells. Ductography may be used to help diagnose certain breast conditions, such as papillomas (wart-like growths) in a milk duct, fibrocystic breast changes, and breast cancer. Also called galactography.
  Dukes A colorectal cancer: (dooks ... KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "Dukes A colorectal cancer"
    Cancer has formed in the mucosa (innermost layer) of the colon and/or rectum wall and has spread to the submucosa (layer of tissue next to the mucosa) or to the muscle layer of the colon and/or rectum wall. Also called stage I colorectal cancer.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage I colorectal cancer. Cancer has formed in the mucosa of the colon/rectum wall and has spread to the submucosa or to the muscle layer of the colon/rectum wall.
    Stage I colorectal cancer; drawing shows a cross-section of the colon/rectum. An inset shows the layers of the colon/rectum wall with cancer in the mucosa and submucosa. Also shown are the muscle layers, serosa, a blood vessel, and lymph nodes.
  Dukes B colorectal cancer: (dooks ... KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "Dukes B colorectal cancer"
    Cancer has spread (1) through the muscle layer of the colon and/or rectal wall to the serosa (outermost layer) of the colon and/or rectal wall; or (2) through the serosa of the colon and/or rectal wall but has not spread to nearby organs; or (3) through the serosa of the colon and/or rectal wall to nearby organs. Also called stage II colorectal cancer.
  Dukes C colorectal cancer: (dooks ... KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "Dukes C colorectal cancer"
    Cancer (1) has spread through the mucosa (innermost layer) of the colon and/or rectal wall to the submucosa (layer of tissue under the mucosa) and may have spread to the muscle layer of the colon and/or rectal wall. Cancer has spread to at least one but not more than 3 nearby lymph nodes, or cancer cells have formed in tissues near the lymph nodes; or cancer has spread through the mucosa of the colon and/or rectal wall to the submucosa. Cancer has spread to at least 4 but not more than 6 nearby lymph nodes. OR, (2) cancer has spread through the muscle layer of the colon and/or rectal wall to the serosa (outermost layer) of the colon and/or rectal wall or has spread through the serosa but not to nearby organs. Cancer has spread to at least one but not more than 3 nearby lymph nodes, or cancer cells have formed in tissues near the lymph nodes; or cancer has spread to the muscle layer of the colon and/or rectal wall or to the serosa of the colon and/or rectal wall. Cancer has spread to at least 4 but not more than 6 nearby lymph nodes; or cancer has spread through the mucosa of the colon and/or rectal wall to the submucosa and may have spread to the muscle layer of the colon and/or rectal wall. Cancer has spread to 7 or more nearby lymph nodes. OR, (3) cancer has spread through the serosa of the colon and/or rectal wall but has not spread to nearby organs. Cancer has spread to at least 4 but not more than 6 nearby lymph nodes; or cancer has spread through the muscle layer of the colon and/or rectal wall to the serosa of the colon and/or rectal wall or has spread through the serosa but has not spread to nearby organs. Cancer has spread to 7 or more nearby lymph nodes; or cancer has spread through the serosa of the colon and/or rectal wall and has spread to nearby organs. Cancer has spread to one or more nearby lymph nodes, or cancer cells have formed in tissues near the lymph nodes. Also called stage III colorectal cancer.
  Dukes classification: (dooks KLA-sih-fih-KAY-shun)
    Pronunciation of dictionary term "Dukes classification"
    A staging system used to describe the extent of colorectal cancer. Stages range from A (early stage) to D (advanced stage).
  duloxetine: (duh-LOK-suh-teen)
    Pronunciation of dictionary term "duloxetine"
    A drug used to treat depression and peripheral neuropathy (pain, numbness, tingling, burning, or weakness in the hands or feet) that can occur with diabetes. It is also being studied in the treatment of peripheral neuropathy caused by certain anticancer drugs. Duloxetine increases the amount of certain chemicals in the brain that help relieve depression and pain. It is a type of serotonin and norepinephrine reuptake inhibitor. Also called Cymbalta and duloxetine hydrochloride.
  duloxetine hydrochloride: (duh-LOK-suh-teen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "duloxetine hydrochloride"
    A drug used to treat depression and peripheral neuropathy (pain, numbness, tingling, burning, or weakness in the hands or feet) that can occur with diabetes. It is also being studied in the treatment of peripheral neuropathy caused by certain anticancer drugs. Duloxetine hydrochloride increases the amount of certain chemicals in the brain that help relieve depression and pain. It is a type of serotonin and norepinephrine reuptake inhibitor. Also called Cymbalta.
  dumping syndrome: (DUM-ping SIN-drome)
    Pronunciation of dictionary term "dumping syndrome"
    A condition that occurs when food or liquid moves too fast into the small intestine. Symptoms include cramps, nausea, diarrhea, sweating, weakness, and dizziness. Dumping syndrome sometimes occurs in people who have had part or all of their stomach removed.
  duodenitis: (DOO-ah-deh-NY-tis)
    Pronunciation of dictionary term "duodenitis"
    Inflammation of the duodenum (the first part of the small intestine that connects to the stomach).
  duodenum: (DOO-ah-DEE-num)
    Pronunciation of dictionary term "duodenum"
    The first part of the small intestine. It connects to the stomach. The duodenum helps to further digest food coming from the stomach. It absorbs nutrients (vitamins, minerals, carbohydrates, fats, proteins) and water from food so they can be used by the body.
    The small intestine is a long tube-like organ that connects the stomach to the large intestine. The small intestine includes the duodenum, jejunum, and ileum.
    Drawing of the small intestine showing the duodenum, jejunum, and ileum. Also shown are the stomach, appendix, large intestine, and rectum.
  dura mater: (DER-uh MAY-ter)
    Pronunciation of dictionary term "dura mater"
    The tough outer layer of tissue that covers and protects the brain and spinal cord and is closest to the skull. The dura mater is one of the three layers that form the meninges.
  durable power of attorney: (DER-uh-bul POW-er ... uh-TER-nee)
    Pronunciation of dictionary term "durable power of attorney"
    A legal document that gives one person (such as a spouse, relative, friend, or lawyer) the authority to make medical, legal, or financial decisions for another person. A durable power of attorney may go into effect right away or when the person who grants it is no longer able to make decisions for themself, depending on how it is written. In most cases, a durable power of attorney remains in effect until the person who grants it dies or cancels it. It does not need to be renewed over time. Also called DPA.
  durable power of attorney for health care: (DER-uh-bul POW-er ... uh-TER-nee ... helth kayr)
    Pronunciation of dictionary term "durable power of attorney for health care"
    A type of advance directive that gives a person (called a proxy) the authority to make medical decisions for another person if that person is not able to make their own decisions. A proxy is usually a spouse, relative, friend, or lawyer who knows the person's values, wishes, and treatment preferences. Also called health care proxy and medical power of attorney.
  durvalumab: (dur-VAL-yoo-mab)
    Pronunciation of dictionary term "durvalumab"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Durvalumab is used alone or with other drugs to treat adults with certain types of biliary tract cancer (including bile duct cancer and gallbladder cancer), bladder cancer, endometrial cancer, hepatocellular carcinoma (a type of liver cancer), non-small cell lung cancer, and small cell lung cancer. It is also being studied in the treatment of other types of cancer. Durvalumab may block PD-L1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Imfinzi.
    More Information
    - Durvalumab (https://www.cancer.gov/about-cancer/treatment/drugs/durvalumab)
  dutasteride: (doo-TAS-teh-ride)
    Pronunciation of dictionary term "dutasteride"
    A drug used to treat symptoms of an enlarged prostate gland. It is being studied in the treatment of male hair loss and prostate cancer. Dutasteride blocks enzymes the body needs to make male sex hormones. It is a type of 5-alpha reductase inhibitor. Also called Avodart and GG745.
    More Information
    - Prostate Cancer Prevention
  duvelisib: (DOO-veh-LIH-sib)
    Pronunciation of dictionary term "duvelisib"
    A drug used to treat adults with chronic lymphocytic leukemia or small lymphocytic lymphoma that came back or did not get better after treatment with at least two other therapies. It is also being studied in the treatment of other types of cancer. Duvelisib blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called Copiktra.
    More Information
    - Duvelisib (https://www.cancer.gov/about-cancer/treatment/drugs/duvelisib)
  DVT: The formation of a blood clot in a deep vein of the leg or lower pelvis. Symptoms may include pain, swelling, warmth, and redness in the affected area. Also called deep vein thrombosis.
  DX-52-1: An anticancer drug that is a type of antitumor antibiotic. It is an anthracycline.
  DX-8951f: An anticancer drug that is a type of topoisomerase inhibitor. Also called exatecan mesylate.
  DXA: A procedure that measures the amount of calcium and other minerals in a bone by passing x-rays with two different energy levels through the bone. A DXA shows the strength and thickness of a bone and is usually done in the lower spine, hip, lower arm, wrist, fingers, and heel. It is used to diagnose osteoporosis (a condition of lower bone density), to see how well osteoporosis treatments are working, and to predict how likely the bones are to break. A DXA also measures fat and muscle composition in specific parts of the body, such as the arms, legs, and pelvis. Also called BMD scan, bone densitometry, bone mineral density scan, DEXA scan, and dual energy x-ray absorptiometry.
  dysautonomia: (dis-aw-toh-NOH-mee-uh)
    Pronunciation of dictionary term "dysautonomia"
    A condition that affects the part of the nervous system called the autonomic nervous system (ANS). The ANS controls many important automatic body processes, such as blood pressure, heart rate, breathing, body temperature, digestion, sweating, urination, and sexual response. Dysautonomia can affect all or part of the ANS and can cause serious problems, such as heart and blood pressure problems, trouble breathing or swallowing, or impotence in males. There are many different types of dysautonomias. They may be inherited or caused by injury or by conditions such as diabetes, Parkinson disease, autoimmune disease, and alcoholism. Sometimes, the cause is not known. Also called autonomic nervous system disorder.
  dyscrasia: (dis-KRAY-zhuh)
    Pronunciation of dictionary term "dyscrasia"
    Disease. Usually refers to diseases of the blood.
  dysesthesia: (DIH-ses-THEE-zhuh)
    Pronunciation of dictionary term "dysesthesia"
    A condition in which a sense, especially touch, is distorted. Dysesthesia can cause an ordinary stimulus to be unpleasant or painful. It can also cause insensitivity to a stimulus.
  dysfunction: (dis-FUNK-shun)
    Pronunciation of dictionary term "dysfunction"
    A state of not functioning normally.
  dysgerminoma: (DIS-jer-mih-NOH-muh)
    Pronunciation of dictionary term "dysgerminoma"
    A type of cancer that begins in germ cells in females. Germ cells are cells that form sperm in males or eggs in females. Dysgerminomas occur most often in the ovaries, but they may also occur in other areas of the body, including the central nervous system. Some dysgerminomas make a hormone called beta-human chorionic gonadotropin (beta-HCG) that may cause signs and symptoms of disease. Dysgerminomas tend to grow and spread slowly. They are the most common type of ovarian germ cell tumor. They usually occur in teenage girls or young women.
  dysgeusia: (dis-GOO-zee-uh)
    Pronunciation of dictionary term "dysgeusia"
    A bad taste in the mouth. Also called parageusia.
    More Information
    - Mouth and Throat Problems: Cancer Treatment Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
    - Oral Complications of Cancer Therapies
  dyskeratosis congenita: (dis-KAYR-uh-TOH-sis kun-JEH-nih-tuh)
    Pronunciation of dictionary term "dyskeratosis congenita"
    A rare, inherited disorder that can affect many parts of the body, especially the nails, skin, and mouth. It is marked by abnormally shaped fingernails and toenails that may grow poorly; changes in skin color, especially on the neck and chest; and white patches inside the mouth. Other problems may include hair loss or early graying of the hair, eye and dental problems, osteoporosis, joint problems, liver disease, and a narrowing of the urethra (tube that carries urine from the bladder to the outside of the body) in men. People with dyskeratosis congenita may develop serious conditions, such as bone marrow failure, myelodysplastic syndrome, pulmonary fibrosis, and certain types of cancer, especially leukemia and cancers of the head and neck, mouth, anus, and genitals. Dyskeratosis congenita may be caused by mutations (changes) in certain genes that affect the length of telomeres (the ends of chromosomes). Also called DKC.
    More Information
    - Dyskeratosis congenita (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10905/dyskeratosis-congenita)
    - Dyskeratosis congenita (MedlinePlus) (https://medlineplus.gov/genetics/condition/dyskeratosis-congenita/)
  dyspepsia: (dis-PEP-see-uh)
    Pronunciation of dictionary term "dyspepsia"
    Upset stomach.
  dysphagia: (dis-FAY-jee-uh)
    Pronunciation of dictionary term "dysphagia"
    Difficulty swallowing.
  dysphonia: (dis-FOH-nee-uh)
    Pronunciation of dictionary term "dysphonia"
    Trouble with the voice when trying to talk, including hoarseness and change in pitch or quality or voice.
  dysplasia: (dis-PLAY-zhuh)
    Pronunciation of dictionary term "dysplasia"
    A term used to describe the presence of abnormal cells within a tissue or organ. Dysplasia is not cancer, but it may sometimes become cancer. Dysplasia can be mild, moderate, or severe, depending on how abnormal the cells look under a microscope and how much of the tissue or organ is affected.
    More Information
    - What is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)
    Normal cells may become cancer cells. Before cancer cells form in tissues of the body, the cells go through abnormal changes called hyperplasia and dysplasia. In hyperplasia, there is an increase in the number of cells in an organ or tissue that appear normal under a microscope. In dysplasia, the cells look abnormal under a microscope but are not cancer. Hyperplasia and dysplasia may or may not become cancer.
    Drawing of four panels showing how normal cells may become cancer cells. The first panel shows normal cells. The second and third panels show abnormal cell changes called hyperplasia and dysplasia. The fourth panel shows cancer cells.
  dysplastic nevus: (dis-PLAS-tik NEE-vus)
    Pronunciation of dictionary term "dysplastic nevus"
    A specific type of nevus (mole) that looks different from a common mole. Dysplastic nevi are mostly flat and often larger than common moles and have borders that are irregular. A dysplastic nevus can contain different colors, which can range from pink to dark brown. Parts of the mole may be raised above the skin surface. A dysplastic nevus may develop into melanoma (a type of skin cancer), and the more dysplastic nevi a person has, the higher the risk of melanoma. A dysplastic nevus is sometimes called an atypical mole.
    More Information
    - Common Moles, Dysplastic Nevi, and Risk of Melanoma (https://www.cancer.gov/types/skin/moles-fact-sheet)
  dyspnea: (DISP-nee-uh)
    Pronunciation of dictionary term "dyspnea"
    Difficult, painful breathing or shortness of breath.
    More Information
    - Cardiopulmonary Syndromes
  dystrophic epidermolysis bullosa: (dis-TROH-fik EH-pih-der-MAH-lih-sis buh-LOH-suh)
    Pronunciation of dictionary term "dystrophic epidermolysis bullosa"
    A rare, inherited disorder in which blisters form on the skin and the moist inner lining of some organs and body cavities. The blisters usually appear at birth and may occur on certain parts of the body (such as the hands, feet, elbows, and knees) or all over the body (including the mouth, esophagus, and other parts of the gastrointestinal tract, the eyes, and the genitourinary tract). This can lead to scarring in the affected areas and thinning of the skin. Other signs and symptoms include small white bumps on the skin; deformities in the fingers, toes, nails, teeth, and joints; trouble chewing and swallowing; vision loss and other eye problems; anemia; slow growth; and poor nutrition. Some people with dystrophic epidermolysis bullosa have a very high risk of developing squamous cell skin cancer at an early age. There are several types of dystrophic epidermolysis bullosa. It is caused by a mutation (change) in the COL7A1 gene. Also called DEB.
    More Information
    - Dystrophic epidermolysis bullosa (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2150/dystrophic-epidermolysis-bullosa)
    - Dystrophic epidermolysis bullosa (MedlinePlus) (https://medlineplus.gov/genetics/condition/dystrophic-epidermolysis-bullosa/)
  e-cigarette: (… SIH-guh-ret)
    Pronunciation of dictionary term "e-cigarette"
    A device that has the shape of a cigarette, cigar, or pen and does not contain tobacco. It uses a battery and contains a solution of nicotine, flavorings, and other chemicals, some of which may be harmful. When e-cigarettes are used, the nicotine solution turns into a mist that can be inhaled into the lungs. The amount of nicotine in individual e-cigarettes can vary. It is not yet known whether e-cigarettes are safe or if they can be used to help smokers quit smoking. Also called electronic cigarette.
  E7070: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called sulfonamides.
  E7389: A drug used to treat certain types of breast cancer and liposarcoma (a type of soft tissue sarcoma) that have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. E7389 blocks cell growth by stopping cell division and may kill cancer cells. It is a type of antimicrotubule agent. Also called eribulin mesylate and Halaven.
    More Information
    - Eribulin Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/eribulinmesylate)
  ear acupuncture: (… AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "ear acupuncture"
    A type of acupuncture in which thin needles are inserted at specific points on the outer ear to control pain and other symptoms. It is thought that the outer ear contains a “map” of the whole body and that specific points on this map match up with certain parts of the body. Also called auricular acupuncture.
    More Information
    - Acupuncture (Health Professional Version) (https://www.cancer.gov/about-cancer/treatment/cam/hp/acupuncture-pdq)
  early diagnosis: (ER-lee DY-ug-NOH-sis)
    Pronunciation of dictionary term "early diagnosis"
    The identification of a disease or condition, such as cancer, as soon as the first signs and symptoms appear. When cancer is diagnosed early, it may be easier to treat or cure.
  early menopause: (ER-lee MEH-nuh-pawz)
    Pronunciation of dictionary term "early menopause"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. There are two types of early menopause, primary and secondary. Primary early menopause means that the ovaries do not function normally. This may be because they have been removed by surgery, or it may be caused by some cancer treatments and certain diseases or genetic conditions. In secondary early menopause, the ovaries are normal but there is a problem getting hormone signals to them from the brain. This is usually caused by diseases of the pituitary gland or hypothalamus. Some women with early menopause sometimes have menstrual periods and may be able to have children. Also called ovarian failure, ovarian insufficiency, and premature menopause.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  early-stage breast cancer: (ER-lee-stayj brest KAN-ser)
    Pronunciation of dictionary term "early-stage breast cancer"
    Breast cancer that has not spread beyond the breast or the axillary lymph nodes. This includes ductal carcinoma in situ and stage I, stage IIA, stage IIB, and stage IIIA breast cancers.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
  early-stage cancer: (ER-lee-stayj KAN-ser)
    Pronunciation of dictionary term "early-stage cancer"
    A term used to describe cancer that is early in its growth, and may not have spread to other parts of the body. What is called early stage may differ between cancer types.
  Eastern red cedar: (EE-stern red SEE-der)
    Pronunciation of dictionary term "Eastern red cedar"
    A type of evergreen tree with hard fragrant wood that is a member of the cypress family. The oil from the wood is used in soaps, shampoos, bath salts, perfumes, aromatherapy, and to keep insects away. The scientific name is Juniperus virginiana. Also called cedarwood and red cedar.
  EBM: A systematic approach to medicine in which doctors and other health care professionals use the best available scientific evidence from clinical research to help make decisions about the care of individual patients. A physician’s clinical experience and the patient’s values and preferences are also important in the process of using the evidence to make decisions. The use of EBM may help plan the best treatment and improve quality of care and patient outcomes. Also called evidence-based medicine.
  EBS-DM: A rare, inherited disorder in which many clusters of blisters form all over the body, especially on the face, hands, feet, arms, legs, and trunk. Blisters may also form in the inner lining of the mouth and other parts of the gastrointestinal tract and the upper respiratory tract. Other signs and symptoms include scarring, changes in skin color, nail problems, and thickening of the skin on the palms of the hands and bottoms of the feet. The signs and symptoms usually appear at birth and tend to get better over time. However, infants with a severe form of the disease die within the first year of life. People with EBS-DM have a high risk of developing basal cell skin cancer by age 55 years. EBS-DM is caused by mutations (changes) in the KRT5 or KRT14 genes. Also called epidermolysis bullosa simplex, Dowling-Meara.
    More Information
    - Epidermolysis bullosa simplex, Dowling-Meara type (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2141/epidermolysis-bullosa-simplex-dowling-meara-type)
    - Epidermolysis bullosa simplex (MedlinePlus) (https://medlineplus.gov/genetics/condition/epidermolysis-bullosa-simplex/)
  EBV: A common virus that remains dormant in most people. EBV causes infectious mononucleosis and has been associated with certain cancers, including Burkitt lymphoma, immunoblastic lymphoma, nasopharyngeal cancer, and stomach (gastric) cancer. Also called Epstein-Barr virus.
    More Information
    - Oral Cavity and Nasopharyngeal Cancers Screening
  ecchymosis: (EH-kih-MOH-sis)
    Pronunciation of dictionary term "ecchymosis"
    A small bruise caused by blood leaking from broken blood vessels into the tissues of the skin or mucous membranes.
  eccrine gland: (EK-rin ...)
    Pronunciation of dictionary term "eccrine gland"
    A type of simple sweat gland that is found in almost all regions of the skin. These glands produce sweat that reaches the surface of the skin by way of coiled ducts (tubes). The body is cooled as sweat evaporates from the skin.
  ECD: A very rare disorder in which too many histiocytes (a type of white blood cell) build up in certain tissues and organs and damage them. ECD most often affects the long bones of the arms and legs, but it can also affect the skin, lungs, heart, kidneys, brain, tissue behind the eyes, and the retroperitoneum (the back wall of the abdomen). The symptoms can range from mild to severe and life-threatening. ECD is most common in adults. It is a type of histiocytosis. Also called Erdheim-Chester disease.
  ECG: A line graph that shows changes in the electrical activity of the heart over time. It is made by an instrument called an electrocardiograph. The graph can show that there are abnormal conditions, such as blocked arteries, changes in electrolytes (particles with electrical charges), and changes in the way electrical currents pass through the heart tissue. Also called EKG and electrocardiogram.
  echinacea: (EH-kih-NAY-shuh)
    Pronunciation of dictionary term "echinacea"
    An herb native to North America that has been used to prevent and treat the common cold and other respiratory infections. Echinacea may interfere with treatment that uses the immune system to fight cancer. The scientific names are Echinacea purpurea and Echinacea angustifolia. Also called purple coneflower.
  echocardiogram: (EH-koh-KAR-dee-oh-gram)
    Pronunciation of dictionary term "echocardiogram"
    A computer picture of the heart created by bouncing high-energy sound waves (ultrasound) off internal tissues or organs of the chest. Echocardiograms show the size, shape, and position of the heart. They also show the parts inside the heart, such as the valves, and the motion of the heart while it is beating. An echocardiogram may be used to help diagnose heart problems, such as abnormal heart valves and heart rhythms, damage to the heart muscle from a heart attack, and heart murmurs. Echocardiograms can also show an infection on or around the heart valves, blood clots or tumors inside the heart, and fluid buildup in the sac around the heart.
  echocardiography: (EH-koh-KAR-dee-AH-gruh-fee)
    Pronunciation of dictionary term "echocardiography"
    A procedure that uses high-energy sound waves (ultrasound) to look at tissues and organs inside the chest. Echoes from the sound waves form a picture of the size, shape, and position of the heart on a computer screen (echocardiogram). The pictures can also show the parts of the inside of the heart, such as the valves, and the motion of the heart while it is beating. Echocardiography may be used to help diagnose heart problems, such as abnormal heart valves and heart rhythms, heart murmurs, and damage to the heart muscle from a heart attack. It may also be used to check for an infection on or around the heart valves, blood clots or tumors inside the heart, and fluid buildup in the sac around the heart.
  ECM: A large network of proteins and other molecules that surround, support, and give structure to cells and tissues in the body. The ECM helps cells attach to, and communicate with, nearby cells, and plays an important role in cell growth, cell movement, and other cell functions. The ECM is also involved in repairing damaged tissue. Abnormal changes in the ECM may lead to the development of certain diseases, such as cancer. The ECM of cancer cells can affect how they grow and spread. Also called extracellular matrix.
  ecologic study: (EE-kuh-LAH-jik STUH-dee)
    Pronunciation of dictionary term "ecologic study"
    A study that compares large groups of people instead of individuals for differences in things such as cancer rates. The groups can differ by location (for example, city, county, or country). They can also differ by time (a few days, years, or decades). Groups can be immigrants (compared with people who are native to the country) or people with different types of jobs. The Surveillance, Epidemiology, and End Results (SEER) Program conducts ecologic studies to collect information on cancer rates over time in certain parts of the United States. Also called ecological study.
  ecological study: (EE-kuh-LAH-jih-kul STUH-dee)
    Pronunciation of dictionary term "ecological study"
    A study that compares large groups of people instead of individuals for differences in things such as cancer rates. The groups can differ by location (for example, city, county, or country). They can also differ by time (a few days, years, or decades). Groups can be immigrants (compared with people who are native to the country) or people with different types of jobs. The Surveillance, Epidemiology, and End Results (SEER) Program conducts ecological studies to collect information on cancer rates over time in certain parts of the United States. Also called ecologic study.
  economic burden: (eh-kuh-NAH-mik BUR-den)
    Pronunciation of dictionary term "economic burden"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Economic burden can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have economic burden than people without cancer. Also called economic hardship, financial burden, financial distress, financial hardship, financial stress, and financial toxicity.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  economic hardship: (eh-kuh-NAH-mik HARD-ship)
    Pronunciation of dictionary term "economic hardship"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Economic hardship can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have economic hardship than people without cancer. Also called economic burden, financial burden, financial distress, financial hardship, financial stress, and financial toxicity.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  ECT: A treatment for severe depression and certain mental disorders. A brief seizure is induced by giving electrical stimulation to the brain through electrodes placed on the scalp. Also called electroconvulsive therapy and electroshock therapy.
  ecteinascidin: (ek-TIH-nuh-SY-din)
    Pronunciation of dictionary term "ecteinascidin"
    A drug used to treat liposarcoma and leiomyosarcoma (types of soft tissue sarcoma) that cannot be removed by surgery or have spread to other parts of the body. It is used in patients who have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Ecteinascidin may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called ET 743, trabectedin, and Yondelis.
    More Information
    - Trabectedin (https://www.cancer.gov/about-cancer/treatment/drugs/trabectedin)
  ectocervix: (EK-toh-SER-vix)
    Pronunciation of dictionary term "ectocervix"
    The outer part of the cervix that opens into the vagina. The ectocervix is lined with squamous cells (thin, flat-looking cells under a microscope). During a pelvic exam, cells may be scraped from the ectocervix so they can be checked under a microscope for infection, inflammation, cervical cancer, or changes that may become cervical cancer. Most cervical cancers begin in squamous cells. Also called exocervix.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  ectomesenchymoma: (EK-toh-MEH-zen-ky-MOH-muh)
    Pronunciation of dictionary term "ectomesenchymoma"
    A rare, fast-growing tumor of the nervous system or soft tissue that occurs in children and young adults. Ectomesenchymomas may form in the head and neck, abdomen, perineum, scrotum, or limbs. Also called malignant ectomesenchymoma.
  ectopic pregnancy: (ek-TAH-pik PREG-nun-see)
    Pronunciation of dictionary term "ectopic pregnancy"
    A condition in which a fertilized egg grows outside of the uterus, usually in one of the fallopian tubes. Symptoms include sharp pain on one side of the abdomen and bleeding from the vagina. Also called extrauterine pregnancy.
  eculizumab: (ek-yoo-LIH-zoo-mab)
    Pronunciation of dictionary term "eculizumab"
    A drug used to prevent red blood cells from being destroyed in patients with a rare red blood cell disorder called paroxysmal nocturnal hemoglobinuria (PNH). It is also used to treat another rare disorder called atypical hemolytic urea syndrome (aHUS), in which blood clots form in small blood vessels. Eculizumab binds to an immune system protein called C5. This helps keep red blood cells from breaking down and helps keep blood clots from forming. Eculizumab is a type of monoclonal antibody. Also called Soliris.
  eczema: (EK-zeh-muh)
    Pronunciation of dictionary term "eczema"
    A group of conditions in which the skin becomes inflamed, forms blisters, and becomes crusty, thick, and scaly. Eczema causes burning and itching, and may occur over a long period of time. Atopic dermatitis is the most common type of eczema.
  edatrexate: (EH-duh-TREK-sayt)
    Pronunciation of dictionary term "edatrexate"
    An anticancer drug that belongs to a family of drugs called antimetabolites.
  edema: (eh-DEE-muh)
    Pronunciation of dictionary term "edema"
    Swelling caused by excess fluid in body tissues.
    More Information
    - Edema (Swelling) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/edema)
  edetic acid: (eh-DEH-tik A-sid)
    Pronunciation of dictionary term "edetic acid"
    A chemical that binds certain metal ions, such as calcium, magnesium, lead, and iron. It is used in medicine to prevent blood samples from clotting and to remove calcium and lead from the body. It is also used to keep bacteria from forming a biofilm (thin layer stuck to a surface). It is a type of chelating agent. Also called EDTA and etheylenediaminetetraacetic acid.
  edotecarin: (eh-doh-TEH-kar-in)
    Pronunciation of dictionary term "edotecarin"
    A substance being studied in the treatment of cancer. It is a type of topoisomerase I inhibitor. Also called J-107088.
  edrecolomab: (EH-dreh-KOH-loh-mab)
    Pronunciation of dictionary term "edrecolomab"
    A type of monoclonal antibody used in cancer detection or therapy. Monoclonal antibodies are laboratory-produced substances that can locate and bind to cancer cells.
  EDTA: A chemical that binds certain metal ions, such as calcium, magnesium, lead, and iron. It is used in medicine to prevent blood samples from clotting and to remove calcium and lead from the body. It is also used to keep bacteria from forming a biofilm (thin layer stuck to a surface). It is a type of chelating agent. Also called edetic acid and etheylenediaminetetraacetic acid.
  Edwards syndrome: (ED-wurdz SIN-drome)
    Pronunciation of dictionary term "Edwards syndrome"
    A genetic disorder caused by having an extra chromosome 18 in some or all of the body’s cells. Edwards syndrome is marked by a low birth weight and certain abnormal features. These include a small, abnormally shaped head; a small jaw and mouth; clenched fists with overlapping fingers; and heart, lung, kidney, intestine, and stomach defects. Many babies with Edwards syndrome die before birth or within the first month of life, but some children live for several years. Having Edwards syndrome increases the risk of certain types of cancer, such as hepatoblastoma (a type of liver cancer) and Wilms tumor (a type of kidney cancer). Also called trisomy 18.
    More Information
    - Trisomy 18 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6321/edwards-syndrome)
    - Trisomy 18 (MedlinePlus) (https://medlineplus.gov/genetics/condition/trisomy-18/)
  EEG: A recording of electrical activity in the brain. It is made by placing electrodes on the scalp (the skin covering the top of the head), and impulses are sent to a special machine. An EEG may be used to diagnose brain and sleep disorders. Also called electroencephalogram.
  EEG biofeedback: (… BY-oh-FEED-bak)
    Pronunciation of dictionary term "EEG biofeedback"
    A treatment being studied to improve brain function in certain brain disorders and in patients treated with chemotherapy for breast cancer. Sensors are placed on a person’s head, which allows brain activity to be shown as patterns on a computer screen. A beep or a tone may be used as a reward to a person for changing certain brain activities. EEG biofeedback may help cancer patients deal with the stress and mental side effects of chemotherapy. Also called neurofeedback.
  EF5: A drug that is used to plan cancer treatment by measuring oxygen levels in tumor cells.
  efaproxiral: (eh-fuh-PROK-sih-rul)
    Pronunciation of dictionary term "efaproxiral"
    A substance being studied in the treatment of brain tumors and some other types of cancer. It increases the amount of oxygen in tumor tissues, which may make the tumor cells easier to kill with radiation therapy. Efaproxiral is a type of radiosensitizing agent. Also called RSR13.
  efavirenz: (ee-FAH-vih-renz)
    Pronunciation of dictionary term "efavirenz"
    A drug used with other drugs to treat infection with the human immunodeficiency virus (HIV). It blocks HIV from making copies of itself. It is a type of non-nucleoside reverse transcriptase inhibitor and a type of antiviral agent. Also called Sustiva.
  effective radiation dose: (eh-FEK-tiv RAY-dee-AY-shun …)
    Pronunciation of dictionary term "effective radiation dose"
    An estimate of the overall risk of potential harm from exposure to ionizing radiation. Ionizing radiation can come from natural sources, such as radon and radiation from outer space, and from medical imaging tests, such as x-rays, CT scans, or PET scans. The effective radiation dose is calculated based on certain factors, such as the type of radiation and its likelihood to cause harm, the amount of radiation absorbed by all organs of the body, and the sensitivity of different tissues and organs to radiation. The effective radiation dose is used to compare different levels of exposure to ionizing radiation in a population. It does not predict the risk of health effects from radiation exposure in individual people. Effective radiation dose may help in understanding the risk of potential long-term health effects from radiation exposure, such as the risk of developing cancer later in life. It is used to set radiation safety standards in health care and other industries. Sievert (Sv) is the unit of measurement for effective radiation dose.
  effector cell: (eh-FEK-ter sel)
    Pronunciation of dictionary term "effector cell"
    A cell that performs a specific function in response to a stimulus; usually used to describe cells in the immune system.
  Effexor: (eh-FEK-sor)
    Pronunciation of dictionary term "Effexor"
    A drug used to treat depression and certain anxiety disorders. It may also be used to treat hot flashes in women who are in menopause or are being treated for breast cancer. Effexor increases the levels of the chemicals serotonin and norepinephrine in the brain, which helps improve mood. It is a type of antidepressant and a type of serotonin-norepinephrine reuptake inhibitor. Also called venlafaxine.
  efficacy: (EH-fih-kuh-see)
    Pronunciation of dictionary term "efficacy"
    Effectiveness. In medicine, the ability of an intervention (for example, a drug or surgery) to produce the desired beneficial effect.
  effusion: (eh-FYOO-zhun)
    Pronunciation of dictionary term "effusion"
    An abnormal collection of fluid in hollow spaces or between tissues of the body. For example, a pleural effusion is a collection of fluid between the two layers of membrane covering the lungs.
    More Information
    - Cardiopulmonary Syndromes
  eflornithine hydrochloride: (ee-FLOR-nih-theen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "eflornithine hydrochloride"
    A drug used to reduce the risk of relapse in adults and children with high-risk neuroblastoma that has gotten better after treatment with certain prior therapies. It is also being studied in the treatment of other conditions and types of cancer. Eflornithine hydrochloride blocks an enzyme called ornithine decarboxylase, which may help keep cancer cells from growing. It is a type of enzyme inhibitor. Also called Iwilfin.
    More Information
    - Eflornithine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/eflornithine-hydrochloride)
  EFS: In cancer, the length of time after primary treatment for a cancer ends that the patient remains free of certain complications or events that the treatment was intended to prevent or delay. These events may include the return of the cancer or the onset of certain symptoms, such as bone pain from cancer that has spread to the bone. In a clinical trial, measuring the EFS is one way to see how well a new treatment works. Also called event-free survival.
  EFTs: A group of cancers that includes Ewing tumor of bone (ETB or Ewing sarcoma of bone), extraosseous Ewing (EOE) tumors, primitive neuroectodermal tumors (PNET or peripheral neuroepithelioma), and Askin tumors (PNET of the chest wall). These tumors all come from the same type of stem cell. Also called Ewing sarcoma family of tumors.
    More Information
    - Bone Cancer (https://www.cancer.gov/types/bone)
  Efudex: (EH-fyoo-dex)
    Pronunciation of dictionary term "Efudex"
    A drug that contains the active ingredient fluorouracil and is used as a cream to treat actinic keratosis (a skin condition that may become cancer) and basal cell skin cancer that is not invasive and cannot be treated with other therapy. Efudex stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  EGb761: A substance that is being studied in the prevention of cognitive dysfunction (slowed ability to think, reason, concentrate, or remember) in patients receiving chemotherapy. It comes from ginkgo biloba leaves.
  EGCG: A substance found in green tea. It is being studied in the prevention of cancer and some other diseases. It is a type of antioxidant. Also called epigallocatechin-3-gallate.
  EGD: A procedure in which an endoscope is passed through the mouth and down the throat into esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is a thin tube with a light and a video camera attached. It may also have a tool to remove a sample of cells, tissue, or fluid so it can be checked under a microscope for signs of disease. An EGD may be used to help diagnose cancer and other conditions, such as Barrett esophagus (a precancerous condition), ulcers, gastroesophageal reflux disease, and celiac disease. It may also be used to remove polyps or other types of growths, stop bleeding caused by ulcers or other conditions, widen a narrow esophagus, place a feeding tube or drainage tube, or remove foreign objects. Also called esophagogastroduodenoscopy, upper endoscopy, upper gastrointestinal endoscopy, and upper GI endoscopy.
    Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.
    Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.
  EGF: A protein made by many cells in the body and by some types of tumors. It causes cells to grow and differentiate (become more specialized). It is a type of growth factor and a type of cytokine. Also called epidermal growth factor.
  EGFR: A protein found on certain types of cells that binds to a substance called epidermal growth factor. The EGFR protein is involved in cell signaling pathways that control cell division and survival. Sometimes, mutations (changes) in the EGFR gene cause EGFR proteins to be made in higher than normal amounts on some types of cancer cells. This causes cancer cells to divide more rapidly. Drugs that block EGFR proteins are being used in the treatment of some types of cancer. EGFRs are a type of receptor tyrosine kinase. Also called epidermal growth factor receptor, ErbB1, and HER1.
  EGFR gene: (… jeen)
    Pronunciation of dictionary term "EGFR gene"
    A gene that makes a protein that is involved in cell growth and cell survival. Mutated (changed) forms of the EGFR gene and protein have been found in some types of cancer, including non-small cell lung cancer. These changes may cause cancer cells to grow and spread in the body. Checking for changes in the EGFR gene in tumor tissue may help plan cancer treatment. Also called epidermal growth factor receptor gene, ERBB1 gene, and HER1 gene.
  EGFR inhibitor: (... in-HIH-bih-ter)
    Pronunciation of dictionary term "EGFR inhibitor"
    A substance that blocks the activity of a protein called epidermal growth factor receptor (EGFR). EGFR is found on the surface of some normal cells and is involved in cell growth. It may also be found at high levels on some types of cancer cells, which causes these cells to grow and divide. Blocking EGFR may keep cancer cells from growing. Some EGFR inhibitors are used to treat cancer. Also called EGFR tyrosine kinase inhibitor, epidermal growth factor receptor inhibitor, and epidermal growth factor receptor tyrosine kinase inhibitor.
  EGFR tyrosine kinase inhibitor: (... TY-ruh-seen KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "EGFR tyrosine kinase inhibitor"
    A substance that blocks the activity of a protein called epidermal growth factor receptor (EGFR). EGFR is found on the surface of some normal cells and is involved in cell growth. It may also be found at high levels on some types of cancer cells, which causes these cells to grow and divide. Blocking EGFR may keep cancer cells from growing. Some EGFR tyrosine kinase inhibitors are used to treat cancer. Also called EGFR inhibitor, epidermal growth factor receptor inhibitor, and epidermal growth factor receptor tyrosine kinase inhibitor.
  egg banking: (... BANK-ing)
    Pronunciation of dictionary term "egg banking"
    The process of freezing one or more unfertilized eggs (eggs that have not been combined with sperm) to save them for future use. The eggs are thawed and fertilized in the laboratory to make embryos that can be placed in a woman’s uterus. Egg banking is being studied as a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called egg cryopreservation, egg freezing, and oocyte cryopreservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  egg cryopreservation: (… KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "egg cryopreservation"
    The process of freezing one or more unfertilized eggs (eggs that have not been combined with sperm) to save them for future use. The eggs are thawed and fertilized in the laboratory to make embryos that can be placed in a woman’s uterus. Egg cryopreservation is being studied as a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called egg banking, egg freezing, and oocyte cryopreservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  egg freezing: (… FREE-zing)
    Pronunciation of dictionary term "egg freezing"
    The process of freezing one or more unfertilized eggs (eggs that have not been combined with sperm) to save them for future use. The eggs are thawed and fertilized in the laboratory to make embryos that can be placed in a woman’s uterus. Egg freezing is being studied as a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called egg banking, egg cryopreservation, and oocyte cryopreservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  eHealth: (EE-helth)
    Pronunciation of dictionary term "eHealth"
    The use of digital technology, such as computers, mobile devices, and the Internet, to deliver and manage health care information and services. Examples of eHealth include electronic medical records, telemedicine, patient portals (secure websites), mobile health applications (apps), wearable health tracking and monitoring devices, and online health education resources. The use of eHealth technology may help promote communication among patients, family members, and the health care team. It also may help patients learn more about their health and take an active role in managing it. eHealth may also help improve access to health care services, reduce costs, and improve the quality of care.
  EHR: An electronic (digital) collection of medical information about a person that is stored on a computer. An EHR includes information about a patient’s health history, such as diagnoses, medicines, tests, allergies, immunizations, and treatment plans. EHRs can be seen by all health care providers who are taking care of a patient and can be used by them to help make recommendations about the patient’s care. Also called electronic health record and electronic medical record.
  ejaculation: (eh-JAK-yoo-LAY-shun)
    Pronunciation of dictionary term "ejaculation"
    The release of semen through the penis during orgasm.
  EKB-569: A substance being studied in the treatment of some types of cancer. It blocks the action of certain proteins that are part of the epidermal growth factor receptor (EGFR) family of proteins. These proteins may be found in increased amounts on the surface of some types of cancer cells. Blocking the action of these proteins may stop cancer cells from growing and may kill cancer cells. EKB-569 is a type of EGFR inhibitor. Also called pelitinib.
  EKG: A line graph that shows changes in the electrical activity of the heart over time. It is made by an instrument called an electrocardiograph. The graph can show that there are abnormal conditions, such as blocked arteries, changes in electrolytes (particles with electrical charges), and changes in the way electrical currents pass through the heart tissue. Also called ECG and electrocardiogram.
  Eklund displacement views: (EH-klund dis-PLAYS-ment vyooz)
    Pronunciation of dictionary term "Eklund displacement views"
    A procedure used to do a mammogram (x-ray of the breasts) in women with breast implants. The implant is pushed back against the chest wall and the breast tissue is pulled forward and around it so the tissue can be seen in the mammogram. Also called Eklund views and implant displacement views.
  Eklund views: (EH-klund vyooz)
    Pronunciation of dictionary term "Eklund views"
    A procedure used to do a mammogram (x-ray of the breasts) in women with breast implants. The implant is pushed back against the chest wall and the breast tissue is pulled forward and around it so the tissue can be seen in the mammogram. Also called Eklund displacement views and implant displacement views.
  elacestrant dihydrochloride: (EH-lah-SES-trant dy-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "elacestrant dihydrochloride"
    A drug used to treat postmenopausal women and adult men with estrogen receptor-positive, HER2-negative breast cancer that has a mutation (change) in the ESR1 gene and is advanced or has spread to other parts of the body. It is used in patients whose disease got worse after treatment with at least one type of hormone therapy. Elacestrant dihydrochloride binds to proteins called estrogen receptors, which are found on some breast cancer cells. These proteins may cause cancer cells to grow. Elacestrant dihydrochloride blocks these proteins and may keep cancer cells from growing. It is a type of estrogen receptor antagonist. Also called Orserdu.
    More Information
    - Elacestrant Dihydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/elacestrant-dihydrochloride)
  Elacyt: (EH-luh-SITE)
    Pronunciation of dictionary term "Elacyt"
    A drug used to treat advanced acute myeloid leukemia (AML). It is a form of the anticancer drug cytarabine that may work in patients with leukemia that is resistant to cytarabine. Elacyt blocks cell division and may kill cancer cells. It is a type of antimetabolite. Also called CP-4055 and elacytarabine.
  elacytarabine: (EH-luh-sy-TAYR-uh-been)
    Pronunciation of dictionary term "elacytarabine"
    A drug used to treat advanced acute myeloid leukemia (AML). It is a form of the anticancer drug cytarabine that may work in patients with leukemia that is resistant to cytarabine. Elacytarabine blocks cell division and may kill cancer cells. It is a type of antimetabolite. Also called CP-4055 and Elacyt.
  Elahere: (el-ah-HEER)
    Pronunciation of dictionary term "Elahere"
    A drug used to treat adults with folate receptor alpha–positive ovarian epithelial, fallopian tube, or primary peritoneal cancer that has not gotten better after treatment with platinum chemotherapy. It is used in patients whose cancer was treated with one to three other systemic therapies. It is also being studied in the treatment of other types of cancer. Elahere contains a monoclonal antibody that binds to a protein called folate receptor alpha, which is found on some cancer cells. It also contains an anticancer drug, which may help kill cancer cells. Elahere is a type of antibody-drug conjugate. Also called mirvetuximab soravtansine.
    More Information
    - Mirvetuximab Soravtansine-gynx (https://www.cancer.gov/about-cancer/treatment/drugs/mirvetuximab-soravtansine-gynx)
  electroacupuncture: (ee-LEK-troh-AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "electroacupuncture"
    A procedure in which pulses of weak electrical current are sent through acupuncture needles into acupuncture points in the skin. This procedure is being studied in the prevention of nausea and vomiting in patients undergoing chemotherapy.
  electrocardiogram: (ee-LEK-troh-KAR-dee-oh-gram)
    Pronunciation of dictionary term "electrocardiogram"
    A line graph that shows changes in the electrical activity of the heart over time. It is made by an instrument called an electrocardiograph. The graph can show that there are abnormal conditions, such as blocked arteries, changes in electrolytes (particles with electrical charges), and changes in the way electrical currents pass through the heart tissue. Also called ECG and EKG.
  electrocautery: (ee-LEK-troh-KAW-teh-ree)
    Pronunciation of dictionary term "electrocautery"
    A procedure that uses heat from an electric current to destroy abnormal tissue, such as a tumor or other lesion. It may also be used to control bleeding during surgery or after an injury. The electric current passes through an electrode that is placed on or near the tissue. The tip of the electrode is heated by the electric current to burn or destroy the tissue. Electrocautery is a type of electrosurgery. Also called electrocoagulation, electrofulguration, and fulguration.
  electrocoagulation: (ee-LEK-troh-koh-A-gyuh-LAY-shun)
    Pronunciation of dictionary term "electrocoagulation"
    A procedure that uses heat from an electric current to destroy abnormal tissue, such as a tumor or other lesion. It may also be used to control bleeding during surgery or after an injury. The electric current passes through an electrode that is placed on or near the tissue. The tip of the electrode is heated by the electric current to burn or destroy the tissue. Electrocoagulation is a type of electrosurgery. Also called electrocautery, electrofulguration, and fulguration.
  electroconvulsive therapy: (ee-LEK-troh-kun-VUL-siv THAYR-uh-pee)
    Pronunciation of dictionary term "electroconvulsive therapy"
    A treatment for severe depression and certain mental disorders. A brief seizure is induced by giving electrical stimulation to the brain through electrodes placed on the scalp. Also called ECT and electroshock therapy.
  electrode: (ee-LEK-trode)
    Pronunciation of dictionary term "electrode"
    In medicine, a device such as a small metal plate or needle that carries electricity from an instrument to a patient for treatment or surgery. Electrodes can also carry electrical signals from muscles, brain, heart, skin, or other body parts to recording devices to help diagnose certain conditions.
  electrodermal response: (ee-LEK-troh-DER-mul reh-SPONTS)
    Pronunciation of dictionary term "electrodermal response"
    A change in the heat and electricity passed through the skin by nerves and sweat. Electrodermal response increases in certain emotional states and during hot flashes that happen with menopause. Also called galvanic skin response and skin conduction.
  electrodesiccation: (ee-LEK-troh-deh-sih-KAY-shun)
    Pronunciation of dictionary term "electrodesiccation"
    The drying of tissue by a high-frequency electric current applied with a needle-shaped electrode.
  electrodiathermy: (ee-LEK-troh-DY-uh-THER-mee)
    Pronunciation of dictionary term "electrodiathermy"
    A procedure in which tissue is heated to destroy abnormal cells. The heat may come from electric currents, microwaves, radio waves, or ultrasound. Electrodiathermy is a type of hyperthermia therapy. Also called diathermy.
  electroencephalogram: (ee-LEK-troh-en-SEH-fuh-loh-gram)
    Pronunciation of dictionary term "electroencephalogram"
    A recording of electrical activity in the brain. It is made by placing electrodes on the scalp (the skin covering the top of the head), and impulses are sent to a special machine. An EEG may be used to diagnose brain and sleep disorders. Also called EEG.
  electrofulguration: (ee-LEK-troh-ful-guh-RAY-shun)
    Pronunciation of dictionary term "electrofulguration"
    A procedure that uses heat from an electric current to destroy abnormal tissue, such as a tumor or other lesion. It may also be used to control bleeding during surgery or after an injury. The electric current passes through an electrode that is placed on or near the tissue. The tip of the electrode is heated by the electric current to burn or destroy the tissue. Electrofulguration is a type of electrosurgery. Also called electrocautery, electrocoagulation, and fulguration.
  electrolarynx: (ee-LEK-troh-LAYR-inx)
    Pronunciation of dictionary term "electrolarynx"
    A battery-operated device that makes a humming sound. It is used to help a person talk after removal of the larynx (voice box).
  electrolyte: (ee-LEK-troh-lite)
    Pronunciation of dictionary term "electrolyte"
    A substance that breaks up into ions (particles with electrical charges) when it is dissolved in water or body fluids. Some examples of ions are sodium, potassium, calcium, chloride, and phosphate. These ions help move nutrients into cells, help move waste out of cells, and help nerves, muscles, the heart, and the brain work the way they should.
  electromagnetic field: (ee-LEK-troh-mag-NEH-tik feeld)
    Pronunciation of dictionary term "electromagnetic field"
    An area of electric and magnetic forces caused by electromagnetic radiation. Researchers are studying whether the electromagnetic fields from power lines, electrical appliances, and wireless and cellular telephones can cause cancer or other harmful health effects. Also called EMF.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  electromagnetic radiation: (ee-LEK-troh-mag-NEH-tik ray-dee-AY-shun)
    Pronunciation of dictionary term "electromagnetic radiation"
    Radiation that has both electric and magnetic fields and travels in waves. It comes from natural and man-made sources. Electromagnetic radiation can vary in strength from low energy to high energy. It includes radio waves, microwaves, infrared light, visible light, ultraviolet light, x-rays, and gamma rays. Also called EMR.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  electromagnetic spectrum: (ee-LEK-troh-mag-NEH-tik SPEK-trum)
    Pronunciation of dictionary term "electromagnetic spectrum"
    The complete range of all types of radiation that has both electric and magnetic fields and travels in waves. The electromagnetic spectrum ranges from low-energy, low-frequency radiation that travels in long waves (such as radio waves and microwaves) to high-energy, high-frequency radiation that travels in short waves (such as x-rays and gamma rays).
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  electron: (ee-LEK-tron)
    Pronunciation of dictionary term "electron"
    A small particle with a negative charge that is found in all atoms. Streams of electrons made by special equipment can be used for radiation treatment.
  electron beam: (ee-LEK-tron beem)
    Pronunciation of dictionary term "electron beam"
    A stream of electrons (small negatively charged particles found in atoms) that can be used for radiation therapy.
  electron microscope: (ee-LEK-tron MY-kroh-SKOPE)
    Pronunciation of dictionary term "electron microscope"
    A microscope (device used to magnify small objects) that uses electrons (instead of light) to produce an enlarged image. An electron microscope shows tiny details better than any other type of microscope.
  electronic cigarette: (eh-lek-TRAH-nik SIH-guh-ret)
    Pronunciation of dictionary term "electronic cigarette"
    A device that has the shape of a cigarette, cigar, or pen and does not contain tobacco. It uses a battery and contains a solution of nicotine, flavorings, and other chemicals, some of which may be harmful. When electronic cigarettes are used, the nicotine solution turns into a mist that can be inhaled into the lungs. The amount of nicotine in individual e-cigarettes can vary. It is not yet known whether electronic cigarettes are safe or if they can be used to help smokers quit smoking. Also called e-cigarette.
  electronic health record: (eh-lek-TRAH-nik helth REH-kurd)
    Pronunciation of dictionary term "electronic health record"
    An electronic (digital) collection of medical information about a person that is stored on a computer. An electronic health record includes information about a patient’s health history, such as diagnoses, medicines, tests, allergies, immunizations, and treatment plans. Electronic health records can be seen by all health care providers who are taking care of a patient and can be used by them to help make recommendations about the patient’s care. Also called EHR and electronic medical record.
  electronic medical record: (eh-lek-TRAH-nik MEH-dih-kul REH-kurd)
    Pronunciation of dictionary term "electronic medical record"
    An electronic (digital) collection of medical information about a person that is stored on a computer. An electronic medical record includes information about a patient’s health history, such as diagnoses, medicines, tests, allergies, immunizations, and treatment plans. Electronic medical records can be seen by all health care providers who are taking care of a patient and can be used by them to help make recommendations about the patient’s care. Also called EHR and electronic health record.
  electrophoresis: (ee-LEK-troh-for-EE-sis)
    Pronunciation of dictionary term "electrophoresis"
    A laboratory technique that uses an electric current to separate substances, such as proteins or nucleic acids. The size and electrical charge (either positive or negative) of a substance determines how far it moves with the current. Electrophoresis may be used to help diagnosis certain diseases. There are many different types of electrophoresis.
  electroporation therapy: (ee-LEK-troh-por-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "electroporation therapy"
    Treatment that generates electrical pulses through an electrode placed in a tumor to enhance the ability of anticancer drugs to enter tumor cells. Also called EPT.
  electroshock therapy: (ee-LEK-troh-shok THAYR-uh-pee)
    Pronunciation of dictionary term "electroshock therapy"
    A treatment for severe depression and certain mental disorders. A brief seizure is induced by giving electrical stimulation to the brain through electrodes placed on the scalp. Also called ECT and electroconvulsive therapy.
  electrosurgery: (ee-LEK-troh-SER-juh-ree)
    Pronunciation of dictionary term "electrosurgery"
    A procedure that uses an electric current to cut, remove, or destroy tissue and control bleeding. The current is carried through an electrode that is placed on or near the tissue. Electrosurgery may be used to treat basal cell skin cancer or other types of skin problems, such as actinic keratoses, warts, and moles. It may also be used to remove abnormal cells from the cervix and to treat abnormal tissue of the vagina, vulva, penis, and anus that might become cancer. Examples of electrosurgery are electrodesiccation and fulguration.
  element: (EH-leh-ment)
    Pronunciation of dictionary term "element"
    A basic part of a whole. In chemistry, refers to a simple substance that cannot be broken down into smaller parts or changed into another substance. The basic part of an element is an atom, which contains protons, neutrons, and electrons. All atoms of an element have the same number of protons. Examples of elements are hydrogen, carbon, oxygen, nitrogen, and calcium.
  elesclomol sodium: (eh-les-KLOH-mol SOH-dee-um)
    Pronunciation of dictionary term "elesclomol sodium"
    A drug used in the treatment of skin cancer that has spread. It is also being studied in the treatment of other types of cancer. It increases the amount of harmful oxygen molecules in cells and may kill cancer cells. It may also help other drugs kill cancer cells. It is a type of oxidative stress inducer.
  ELF-EMF: A type of very low-energy radiation that travels in long waves. Although there have been health concerns, it is not known to cause harmful health effects, including cancer. The most common sources of ELF-EMFs are power lines, electrical wiring, and electrical appliances, such as shavers, hair dryers, and electric blankets. Also called extremely low frequency electromagnetic field.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  Eligard: (EH-lih-gard)
    Pronunciation of dictionary term "Eligard"
    A drug used under the brand names Eligard and Lupron Depot to treat prostate cancer and under the brand name Lupron Depot to treat problems with the endometrium (lining of the uterus) and uterine fibroids (noncancerous growths of the uterus) . It is also being studied in the treatment of other conditions and types of cancer. Eligard initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men and estrogen levels in women. With continued use, Eligard lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in men and estrogen levels in women. Eligard may stop the growth of cancer cells that need testosterone to grow and stop the growth of endometrial tissue and uterine fibroids. It is a type of hormone therapy called a gonadotropin-releasing hormone (GnRH) agonist. Also called leuprolide acetate and Lupron Depot.
    More Information
    - Leuprolide Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/leuprolideacetate)
  eligibility criteria: (EH-lih-jih-BIH-lih-tee kry-TEER-ee-uh)
    Pronunciation of dictionary term "eligibility criteria"
    In clinical trials, requirements that must be met for a person to be included in a trial. These requirements help make sure that participants in a trial are like each other in terms of specific factors such as age, type and stage of cancer, general health, and previous treatment. When all participants meet the same eligibility criteria, it is more likely that results of the study are caused by the intervention being tested and not by other factors or by chance.
  ELISA: (ee-LY-suh)
    Pronunciation of dictionary term "ELISA"
    A laboratory technique that uses antibodies linked to enzymes to detect and measure the amount of a substance in a solution, such as serum. The test is done using a solid surface to which the antibodies and other molecules stick. In the final step, an enzyme reaction takes place that causes a color change that can be read using a special machine. There are many different ways that an ELISA can be done. ELISAs may be used to help diagnose certain diseases. Also called enzyme-linked immunosorbent assay.
  Elitek: (EH-lih-tek)
    Pronunciation of dictionary term "Elitek"
    A drug used to treat high levels of uric acid in the blood of adults and children with leukemia, lymphoma, or other types of cancer who are receiving certain types of anticancer therapy. Uric acid is a natural substance that can build up in the blood as tumors break down. Elitek helps break down and remove uric acid from the body. It is a type of recombinant enzyme and a type of urate-lowering drug. Also called rasburicase and recombinant urate oxidase.
    More Information
    - Rasburicase (https://www.cancer.gov/about-cancer/treatment/drugs/rasburicase)
  Ellence: (eh-LENTS)
    Pronunciation of dictionary term "Ellence"
    A drug used with other drugs to treat breast cancer that was removed by surgery and has spread to the lymph nodes under the arm. It is also being studied in the treatment of other types of cancer. Ellence blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called epirubicin hydrochloride.
    More Information
    - Epirubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/epirubicinhydrochloride)
  Elocon: (EH-loh-kon)
    Pronunciation of dictionary term "Elocon"
    A drug that is used in a cream to treat certain skin conditions and in a nasal spray to treat sinus problems caused by allergies. It is being studied as a way to treat inflammation of the skin caused by radiation therapy. Elocon is a type of corticosteroid. Also called mometasone furoate and Nasonex.
  elotuzumab: (EH-loh-TOO-zoo-mab)
    Pronunciation of dictionary term "elotuzumab"
    A drug used with dexamethasone and either lenalidomide or pomalidomide to treat adults with multiple myeloma. It is used in patients whose cancer was already treated with other anticancer therapies. Elotuzumab binds to a protein called CS1, which is found on myeloma cells and some types of immune cells. Elotuzumab may block CS1 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Empliciti and HuLuc63.
    More Information
    - Elotuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/elotuzumab)
  Eloxatin: (eh-LOK-sah-tin)
    Pronunciation of dictionary term "Eloxatin"
    A drug used with other drugs to treat stage III colon cancer that was removed by surgery and colorectal cancer that is advanced. It is also being studied in the treatment of other types of cancer. Eloxatin damages the cell’s DNA and may kill cancer cells. It is a type of platinum compound. Also called oxaliplatin.
    More Information
    - Oxaliplatin (https://www.cancer.gov/about-cancer/treatment/drugs/oxaliplatin)
  elranatamab: (EL-rah-NA-tah-mab)
    Pronunciation of dictionary term "elranatamab"
    A drug used to treat adults with multiple myeloma that came back or did not get better after treatment with at least four other anticancer therapies. These therapies had to include an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Elranatamab binds to a protein called CD3, which is found on T cells (a type of white blood cell), and to a protein called BCMA, which is found on myeloma cells and some types of immune cells. This may help the immune system kill cancer cells. Elranatamab is a type of bispecific T-cell engager. Also called Elrexfio.
    More Information
    - Elranatamab-bcmm (https://www.cancer.gov/about-cancer/treatment/drugs/elranatamab-bcmm)
  Elrexfio: (el-REK-sfee-oh)
    Pronunciation of dictionary term "Elrexfio"
    A drug used to treat adults with multiple myeloma that came back or did not get better after treatment with at least four other anticancer therapies. These therapies had to include an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Elrexfio binds to a protein called CD3, which is found on T cells (a type of white blood cell), and to a protein called BCMA, which is found on myeloma cells and some types of immune cells. This may help the immune system kill cancer cells. Elrexfio is a type of bispecific T-cell engager. Also called elranatamab.
    More Information
    - Elranatamab-bcmm (https://www.cancer.gov/about-cancer/treatment/drugs/elranatamab-bcmm)
  Elspar: (EL-spar)
    Pronunciation of dictionary term "Elspar"
    A drug that is used to treat acute lymphoblastic leukemia (ALL) and is being studied in the treatment of some other types of cancer. It is an enzyme taken from the bacterium Escherichia coli (E. coli). It breaks down the amino acid asparagine and may block the growth of tumor cells that need asparagine to grow. Also called asparaginase and L-asparaginase.
  eltrombopag olamine: (el-TROM-boh-pag OH-luh-meen)
    Pronunciation of dictionary term "eltrombopag olamine"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults and children with chronic immune thrombocytopenic purpura that did not get better with other treatment. Eltrombopag olamine is also used to treat severe aplastic anemia. It is also being studied in the treatment of other conditions and types of cancer. Eltrombopag olamine binds to the thrombopoietin receptor, which causes the bone marrow to make more platelets. It is a type of thrombopoietin receptor agonist. Also called Promacta.
    More Information
    - Eltrombopag Olamine (https://www.cancer.gov/about-cancer/treatment/drugs/eltrombopagolamine)
  Elzonris: (el-ZON-ris)
    Pronunciation of dictionary term "Elzonris"
    A drug used to treat adults and children aged 2 years and older with a rare blood cancer called blastic plasmacytoid dendritic cell neoplasm. It is also being studied in the treatment of other types of cancer. Elzonris is made up of interleukin-3 (IL-3), which binds to an IL-3 receptor protein called CD123. CD123 may be found in higher than normal amounts on some types of cancer cells. Elzonris is also made up of a diphtheria toxin, which may help kill cancer cells. Elzonris is a type of cytotoxin. Also called tagraxofusp.
    More Information
    - Tagraxofusp-erzs (https://www.cancer.gov/about-cancer/treatment/drugs/tagraxofusp-erzs)
  EM-1421: A substance being studied in the treatment of cancer. It blocks proteins needed for cancer growth. It is a type of transcriptional inhibitor. Also called tetra-O-methyl NDGA and tetra-O-methyl nordihydroguaiaretic acid.
  emapalumab: (EH-muh-PAL-yoo-mab)
    Pronunciation of dictionary term "emapalumab"
    A drug used to treat a rare immune system disorder called primary hemophagocytic lymphohistiocytosis (HLH). It is used in patients whose disease came back, got worse, did not get better, or cannot be treated with other therapy. It is also being studied in the treatment of other conditions. Emapalumab binds to an immune system protein called interferon gamma, which is found at higher than normal levels in patients with HLH. This may help lower the body’s immune response and reduce inflammation. Emapalumab is a type of monoclonal antibody. Also called Gamifant.
    More Information
    - Emapalumab-lzsg (https://www.cancer.gov/about-cancer/treatment/drugs/emapalumab-lzsg)
  embalmer: (em-BAL-mer)
    Pronunciation of dictionary term "embalmer"
    A person who treats dead bodies with embalming fluid (a chemical like formaldehyde) to keep them from decaying.
  embolism: (EM-boh-lih-zum)
    Pronunciation of dictionary term "embolism"
    A block in an artery caused by blood clots or other substances, such as fat globules, infected tissue, or cancer cells.
  embolization: (EM-boh-lih-ZAY-shun)
    Pronunciation of dictionary term "embolization"
    A procedure that uses particles, such as tiny gelatin sponges or beads, to block a blood vessel. Embolization may be used to stop bleeding or to block the flow of blood to a tumor or abnormal area of tissue. It may be used to treat some types of liver cancer, kidney cancer, and neuroendocrine tumors. It may also be used to treat uterine fibroids, aneurysms, and other conditions. Types of embolization are arterial embolization, chemoembolization, and radioembolization.
  embryo: (EM-bree-oh)
    Pronunciation of dictionary term "embryo"
    Early stage in the development of humans and other animals or plants. In animals that have a backbone or spinal column, this stage lasts from shortly after fertilization until all major body parts appear. In particular, in humans, this stage lasts from about 2 weeks after fertilization until the end of the seventh or eighth week of pregnancy.
  embryo banking: (EM-bree-oh BANK-ing)
    Pronunciation of dictionary term "embryo banking"
    The process of freezing one or more embryos to save them for future use. Embryo banking involves in vitro fertilization, a procedure in which eggs are removed from a woman’s ovary and combined with sperm in the laboratory to form embryos. The embryos are frozen and can later be thawed and placed in a woman’s uterus. Embryo banking is a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called embryo cryopreservation and embryo freezing.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  embryo cryopreservation: (EM-bree-oh KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "embryo cryopreservation"
    The process of freezing one or more embryos to save them for future use. Embryo cryopreservation involves in vitro fertilization, a procedure in which eggs are removed from a woman’s ovary and combined with sperm in the laboratory to form embryos. The embryos are frozen and can later be thawed and placed in a woman’s uterus. Embryo cryopreservation is a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called embryo banking and embryo freezing.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  embryo freezing: (EM-bree-oh FREE-zing)
    Pronunciation of dictionary term "embryo freezing"
    The process of freezing one or more embryos to save them for future use. Embryo freezing involves in vitro fertilization, a procedure in which eggs are removed from a woman’s ovary and combined with sperm in the laboratory to form embryos. The embryos are frozen and can later be thawed and placed in a woman’s uterus. Embryo freezing is a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called embryo banking and embryo cryopreservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  embryoma: (EM-bree-OH-muh)
    Pronunciation of dictionary term "embryoma"
    A mass of rapidly growing cells that begins in embryonic (fetal) tissue. Embryomas may be benign or malignant, and include neuroblastomas and Wilms tumors. Also called embryonal tumor.
  embryonal rhabdomyosarcoma: (em-BRY-uh-nul RAB-doh-MY-oh-sar-KOH-muh)
    Pronunciation of dictionary term "embryonal rhabdomyosarcoma"
    A soft tissue tumor that is most common in infants and young children. It begins in muscles, usually in the head, neck, or genitourinary tract. Also called ERMS.
  embryonal tumor: (em-BRY-uh-nul TOO-mer)
    Pronunciation of dictionary term "embryonal tumor"
    A mass of rapidly growing cells that begins in embryonic (fetal) tissue. Embryonal tumors may be benign or malignant, and include neuroblastomas and Wilms tumors. Also called embryoma.
  embryonic: (EM-bree-AH-nik)
    Pronunciation of dictionary term "embryonic"
    Having to do with an embryo, which is an early stage in the development of a plant or animal.
  EMC: A rare, slow-growing type of cancer that forms in soft tissues outside the bone and usually has certain changes in the NR4A3 gene that cause abnormal fusion proteins to be made. EMCs usually occur in the thigh but may also occur in the knee, buttock, or chest and abdomen. They may grow large and spread to nearby tissue or to other parts of the body, especially the lungs. They may also come back many years after treatment. EMCs usually occur in middle-aged or older adults and are rare in children and adolescents. They are a type of soft tissue sarcoma. Also called extraskeletal myxoid chondrosarcoma.
  EMD 121974: A substance that is being studied as an anticancer and antiangiogenesis drug. Also called cilengitide.
  Emend: (ee-MEND)
    Pronunciation of dictionary term "Emend"
    A drug used with other drugs to prevent nausea and vomiting caused by chemotherapy and nausea and vomiting after surgery. Emend blocks the action of a certain chemical in the central nervous system that may trigger nausea and vomiting. Blocking this chemical may help lessen nausea and vomiting. Emend is a type of antiemetic and a type of substance P/neurokinin 1 receptor antagonist. Also called aprepitant and Cinvanti.
    More Information
    - Aprepitant (https://www.cancer.gov/about-cancer/treatment/drugs/aprepitant)
  emesis: (EH-meh-sis)
    Pronunciation of dictionary term "emesis"
    The forceful ejection of some or all of the contents of the stomach through the mouth. Emesis may be caused by many things, including certain smells, irritation to the stomach, infections, stress, pain, motion sickness, migraines, certain medicines, some diseases or conditions, and brain injury or concussion. It can also be a symptom of some cancers and a side effect of certain cancer treatments. Also called vomiting.
    More Information
    - Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
    - Nausea and vomiting - adults (MedlinePlus) (https://medlineplus.gov/ency/article/003117.htm)
  emetic: (eh-MEH-tik)
    Pronunciation of dictionary term "emetic"
    Describes a substance that causes vomiting. Also called emetogenic.
  emetogenic: (eh-MEH-toh-JEH-nik)
    Pronunciation of dictionary term "emetogenic"
    Describes a substance that causes vomiting. Also called emetic.
  EMF: An area of electric and magnetic forces caused by electromagnetic radiation. Researchers are studying whether the EMFs from power lines, electrical appliances, and wireless and cellular telephones can cause cancer or other harmful health effects. Also called electromagnetic field.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  emitefur: (eh-MIH-teh-fur)
    Pronunciation of dictionary term "emitefur"
    An anticancer drug that belongs to the family of drugs called antimetabolites.
  emodin: (EH-moh-din)
    Pronunciation of dictionary term "emodin"
    A substance found in certain plants, including rhubarb. It belongs to a family of compounds called anthraquinones, which have shown anti-inflammatory and anticancer effects.
  emollient: (eh-MOL-ee-unt)
    Pronunciation of dictionary term "emollient"
    A substance that helps soothe, soften, and increase moisture levels, especially in the skin. Emollients may be used in a lotion, cream, ointment, or gel to prevent or treat dry, rough, scaly, itchy skin and other skin problems, such as rashes or burns. They may also be used to help protect the skin against irritation. Emollients may also be given by mouth to prevent or treat constipation by moistening and softening the stool.
  emphysema: (EMP-fuh-ZEE-muh)
    Pronunciation of dictionary term "emphysema"
    A disorder affecting the alveoli (tiny air sacs) of the lungs. The transfer of oxygen and carbon dioxide in the lungs takes place in the walls of the alveoli. In emphysema, the alveoli become abnormally inflated, damaging their walls and making it harder to breathe. People who smoke or have chronic bronchitis have an increased risk of emphysema. Emphysema is a type of chronic obstructive pulmonary disease (COPD).
  Empliciti: (em-PLIH-sih-tee)
    Pronunciation of dictionary term "Empliciti"
    A drug used with dexamethasone and either lenalidomide or pomalidomide to treat adults with multiple myeloma. It is used in patients whose cancer was already treated with other anticancer therapies. Empliciti binds to a protein called CS1, which is found on myeloma cells and some types of immune cells. Empliciti may block CS1 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called elotuzumab and HuLuc63.
    More Information
    - Elotuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/elotuzumab)
  EMR: Radiation that has both electric and magnetic fields and travels in waves. It comes from natural and man-made sources. EMR can vary in strength from low energy to high energy. It includes radio waves, microwaves, infrared light, visible light, ultraviolet light, x-rays, and gamma rays. Also called electromagnetic radiation.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  enalapril: (eh-NA-luh-pril)
    Pronunciation of dictionary term "enalapril"
    An antihypertensive agent that can also be used to slow or prevent the progression of heart disease in people with childhood cancer treated with drugs that may be harmful to the heart.
  enasidenib mesylate: (EH-nuh-SIH-deh-nib MEH-zih-layt)
    Pronunciation of dictionary term "enasidenib mesylate"
    A drug used to treat adults with acute myeloid leukemia that has come back or has not gotten better with other treatment. It is used in patients whose cancer has a mutation (change) in the IDH2 gene. It is also being studied in the treatment of other types of cancer. Enasidenib mesylate blocks the protein made by the mutated IDH2 gene. Blocking this protein may help keep cancer cells from growing. Enasidenib mesylate is a type of enzyme inhibitor. Also called Idhifa.
    More Information
    - Enasidenib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/enasidenibmesylate)
  encapsulated: (en-KAP-soo-lay-ted)
    Pronunciation of dictionary term "encapsulated"
    Confined to a specific, localized area and surrounded by a thin layer of tissue.
  encephalitis: (en-SEH-fuh-LY-tis)
    Pronunciation of dictionary term "encephalitis"
    A rare condition in which the tissues in the brain become inflamed. Encephalitis is usually caused by a viral infection, but it may also be caused by bacterial or parasitic infections, cancer, or certain drugs or toxins. Signs and symptoms include fever, headache, joint or muscle aches, poor appetite, fatigue, weakness, confusion, changes in behavior, seizures, and problems with vision, speech, or movement. Infants and young children may have nausea, vomiting, body stiffness, feeding problems, and irritability. Most patients have mild symptoms, but sometimes symptoms may be severe or life threatening.
  encephalopathy: (en-SEH-fuh-LAH-puh-thee)
    Pronunciation of dictionary term "encephalopathy"
    A disorder of the brain that can be caused by disease, injury, drugs, or chemicals.
  enchondroma: (en-kon-DROH-muh)
    Pronunciation of dictionary term "enchondroma"
    A benign (not cancer) growth of cartilage in bones or in other areas where cartilage is not normally found.
  enchondromatosis: (en-kon-DROH-muh-TOH-sis)
    Pronunciation of dictionary term "enchondromatosis"
    A rare disorder that causes benign (not cancer) growths of cartilage in the bones that may become cancer. These growths, called enchondromas, usually occur in the bones of the hands and feet, but they may also occur in the skull, ribs, and spine. They may cause bones to break, to be deformed, or to be shorter than usual. People with enchondromatosis have an increased risk of developing certain types of cancer, including chondrosarcoma (cancer that forms in bone cartilage) and cancers of the ovary or liver. Enchondromatosis is most common in children and young adults. Also called Ollier disease.
    More Information
    - Ollier disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7251/ollier-disease)
    - Ollier disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/ollier-disease/)
  encorafenib: (EN-kor-A-feh-nib)
    Pronunciation of dictionary term "encorafenib"
    A drug used with cetuximab to treat certain types of colorectal cancer and with binimetinib to treat certain types of melanoma and non-small cell lung cancer. It is used in patients whose cancer has a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Encorafenib blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called Braftovi.
    More Information
    - Encorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/encorafenib)
  end-of-life care: (… kayr)
    Pronunciation of dictionary term "end-of-life care"
    Care given to people who are near the end of life and have stopped treatment to cure or control their disease. End-of-life care includes physical, emotional, social, and spiritual support for patients and their families. The goal of end-of-life care is to control pain and other symptoms so the patient can be as comfortable as possible. End-of-life care may include palliative care, supportive care, and hospice care. Also called comfort care.
    More Information
    - Last Days of Life
    - End-of-Life Care for People Who Have Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/care-fact-sheet)
    - Coping with Advanced Cancer: Choices for Care Near the End of Life (https://www.cancer.gov/publications/patient-education/advanced-cancer)
    - Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices)
  end-stage cancer: (… stayj KAN-ser)
    Pronunciation of dictionary term "end-stage cancer"
    Cancer that cannot be cured or controlled with treatment and leads to death. A person with end-stage cancer may receive treatment to help control pain and other symptoms so they can be as comfortable as possible and have a better quality of life. Also called terminal cancer.
    More Information
    - Last Days of Life
    - End-of-Life Care for People Who Have Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/care-fact-sheet)
    - Coping with Advanced Cancer: Choices for Care Near the End of Life (https://www.cancer.gov/publications/patient-education/advanced-cancer)
    - Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices)
    - Young People Facing End-of-Life Care Decisions (https://www.cancer.gov/types/aya/end-of-life)
  endemic: (en-DEH-mik)
    Pronunciation of dictionary term "endemic"
    In medicine, describes a disease that is constantly present in a certain geographic area or in a certain group of people. For example, endemic Burkitt lymphoma (a type of non-Hodgkin lymphoma) is seen at constant levels in certain parts of Africa.
  Endo-Pat 2000: (EN-doh-pat...)
    Pronunciation of dictionary term "Endo-Pat 2000"
    A medical device that tests to see if endothelial cells are damaged. Endothelial cells line the inner walls of blood vessels, lymph vessels, and the heart, and damage to them may be an early sign of heart disease. Endo-Pat 2000 looks for heart disease by using sensors that measure blood flow through a patient’s fingers. It is also being used to check blood vessels in patients treated for breast cancer. Also called EndoPat.
  endocarditis: (EN-doh-kar-DY-tis)
    Pronunciation of dictionary term "endocarditis"
    A condition in which the tissues lining the inside of the heart and the heart valves become inflamed (red and swollen). Endocarditis may be caused by infection with microorganisms, such as bacteria or fungi.
  endocervical canal: (EN-doh-SER-vih-kul kuh-NAL)
    Pronunciation of dictionary term "endocervical canal"
    The inner part of the cervix that forms a canal that connects the vagina to the uterus. The endocervical canal is lined with glandular cells that make mucus. During a pelvic exam, cells may be scraped from the endocervical canal so they can be checked under a microscope for infection, inflammation, cervical cancer, or changes that may become cervical cancer. A type of cervical cancer that begins in cells of the endocervical canal is called cervical adenocarcinoma. Also called endocervix.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  endocervical curettage: (en-doh-SER-vih-kul kyoo-reh-TAZH)
    Pronunciation of dictionary term "endocervical curettage"
    A procedure done after an abnormal Pap test result in which a sample of tissue is scraped from the lining of the cervical canal (the inner part of the cervix that connects the uterus to the vagina) using a spoon-shaped instrument called a curette. The tissue is then checked under a microscope for signs of disease. An endocervical curettage may be done at the same time as a colposcopy (a procedure that uses a lighted, magnifying instrument to examine the cervix, vagina, and vulva).
  endocervix: (EN-doh-SER-vix)
    Pronunciation of dictionary term "endocervix"
    The inner part of the cervix that forms a canal that connects the vagina to the uterus. The endocervix is lined with glandular cells that make mucus. During a pelvic exam, cells may be scraped from the endocervix so they can be checked under a microscope for infection, inflammation, cervical cancer, or changes that may become cervical cancer. A type of cervical cancer that begins in cells of the endocervix is called cervical adenocarcinoma. Also called endocervical canal.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  endocrine: (EN-doh-krin)
    Pronunciation of dictionary term "endocrine"
    Refers to tissue that makes and releases hormones that travel in the bloodstream and control the actions of other cells or organs. Some examples of endocrine tissues are the pituitary, thyroid, and adrenal glands.
  endocrine cancer: (EN-doh-krin KAN-ser)
    Pronunciation of dictionary term "endocrine cancer"
    Cancer that occurs in endocrine tissue, the tissue in the body that secretes hormones.
  endocrine gland: (EN-doh-krin …)
    Pronunciation of dictionary term "endocrine gland"
    An organ that makes hormones that are released directly into the blood and travel to tissues and organs all over the body. Endocrine glands help control many body functions, including growth and development, metabolism, and fertility. Some examples of endocrine glands are the pituitary, thyroid, and adrenal glands.
  endocrine pancreas cell: (EN-doh-krin PAN-kree-us sel)
    Pronunciation of dictionary term "endocrine pancreas cell"
    A pancreatic cell that produces hormones (e.g., insulin and glucagon) that are secreted into the bloodstream. These hormones help control the level of glucose (sugar) in the blood. Also called islet cell and islet of Langerhans cell.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  endocrine system: (EN-doh-krin SIS-tem)
    Pronunciation of dictionary term "endocrine system"
    The glands and organs that make hormones and release them directly into the blood so they can travel to tissues and organs all over the body. The hormones released by the endocrine system control many important functions in the body, including growth and development, metabolism, and reproduction. The endocrine system includes the hypothalamus, pineal gland, pituitary gland, thyroid gland, parathyroid glands, thymus, adrenal glands, and pancreas. It also includes the testes in males and the ovaries and placenta (during pregnancy) in females.
    Glands and organs of the endocrine system. The endocrine system is made up of glands and organs that make hormones that control many important functions in the body. These include the hypothalamus, pituitary gland, pineal gland, thyroid gland, parathyroid glands, thymus, adrenal glands, pancreas, and the reproductive organs (ovaries in females and testes in males).
    Glands and organs of the endocrine system; drawing shows the hypothalamus, pituitary gland, pineal gland, thyroid gland, thymus, adrenal gland, pancreas, ovaries (female), and testes (male). An inset shows the back view of the thyroid gland with the four pea-sized parathyroid glands on it.
  endocrine therapy: (EN-doh-krin THAYR-uh-pee)
    Pronunciation of dictionary term "endocrine therapy"
    Treatment that adds, blocks, or removes hormones. For certain conditions (such as diabetes or menopause), hormones are given to adjust low hormone levels. Hormones can also cause certain cancers (such as prostate and breast cancer) to grow. To slow or stop the growth of cancer, synthetic hormones or other drugs may be given to block the body’s natural hormones, or surgery is used to remove the gland that makes a certain hormone. Also called hormonal therapy, hormone therapy, and hormone treatment.
  endocrine-inactive tumor: (EN-doh-krin-in-AK-tiv TOO-mer)
    Pronunciation of dictionary term "endocrine-inactive tumor"
    A tumor that is found in endocrine tissue but does not make extra hormones. Endocrine-inactive tumors usually do not cause symptoms until they grow large or spread to other parts of the body. Also called nonfunctioning tumor.
  endocrinologist: (EN-doh-krih-NAH-loh-jist)
    Pronunciation of dictionary term "endocrinologist"
    A doctor who has special training in diagnosing and treating disorders of the endocrine system (the glands and organs that make hormones). These disorders include diabetes, infertility, and thyroid, adrenal, and pituitary gland problems.
  endocrinology: (EN-doh-krih-NAH-loh-jee)
    Pronunciation of dictionary term "endocrinology"
    A branch of medicine that specializes in diagnosing and treating disorders of the endocrine system, which includes the glands and organs that make hormones. These disorders include diabetes, infertility, and thyroid, adrenal, and pituitary gland problems.
  endodermal sinus tumor: (EN-doh-DER-mul SY-nus TOO-mer)
    Pronunciation of dictionary term "endodermal sinus tumor"
    A rare type of cancer that begins in germ cells (cells that form sperm or eggs). Endodermal sinus tumors occur most often in the ovary or testicle, but they may also occur in other areas of the body, such as the chest, abdomen, or brain. They tend to grow quickly and spread to other parts of the body if not treated. Endodermal sinus tumors are the most common malignant germ cell tumor in children. Also called yolk sac tumor.
  endogenous: (en-DAH-jeh-nus)
    Pronunciation of dictionary term "endogenous"
    Produced inside an organism or cell. The opposite is external (exogenous) production.
  endoluminal: (EN-doh-LOO-mih-nul)
    Pronunciation of dictionary term "endoluminal"
    In medicine, refers to the area inside a tube, duct, or hollow organ in the body. Examples are a blood vessel, the stomach, or the intestines.
  endoluminal laser therapy: (EN-doh-LOO-mih-nul LAY-zer THAYR-uh-pee)
    Pronunciation of dictionary term "endoluminal laser therapy"
    A procedure in which an endoscope (a thin, lighted tube) with a laser attached is inserted into the body and used as a knife to cut out or destroy abnormal tissue, such as cancer tissue, or seal off blood or lymph vessels. Endoluminal laser therapy may be used to ease certain symptoms caused by advanced cancer. For example, it may be used to destroy tumor tissue that is blocking the windpipe, throat, stomach, or colon.
    More Information
    - Lasers to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/lasers)
  endolymphatic sac: (EN-doh-lim-FA-tik sak)
    Pronunciation of dictionary term "endolymphatic sac"
    A balloon-shaped structure filled with fluid in the inner ear. The fluid in the endolymphatic sac surrounds and protects the structures in the inner ear that affect hearing and balance. When pressure in the inner ear builds, the endolymphatic sac releases fluid to relieve the pressure. The endolymphatic sac also removes extra fluid and waste products from the inner ear and is involved in the inner ear’s immune response to foreign substances.
  endometrial: (EN-doh-MEE-tree-ul)
    Pronunciation of dictionary term "endometrial"
    Having to do with the endometrium (the layer of tissue that lines the uterus).
  endometrial biopsy: (EN-doh-MEE-tree-ul BY-op-see)
    Pronunciation of dictionary term "endometrial biopsy"
    A procedure in which a sample of tissue is taken from the endometrium (inner lining of the uterus) for examination under a microscope. A thin tube is inserted through the cervix into the uterus, and gentle scraping and suction are used to remove the sample.
  endometrial cancer: (EN-doh-MEE-tree-ul KAN-ser)
    Pronunciation of dictionary term "endometrial cancer"
    Cancer that forms in the tissue lining the uterus (the small, hollow, pear-shaped organ in a woman's pelvis in which a fetus develops). Most endometrial cancers are adenocarcinomas (cancers that begin in cells that make and release mucus and other fluids).
    More Information
    - Uterine Cancer (https://www.cancer.gov/types/uterine)
  endometrial disorder: (EN-doh-MEE-tree-ul dis-OR-der)
    Pronunciation of dictionary term "endometrial disorder"
    Abnormal cell growth in the endometrium (the lining of the uterus).
  endometrial hyperplasia: (EN-doh-MEE-tree-ul HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "endometrial hyperplasia"
    An abnormal overgrowth of the endometrium (the layer of cells that lines the uterus). There are four types of endometrial hyperplasia: simple endometrial hyperplasia, complex endometrial hyperplasia, simple endometrial hyperplasia with atypia, and complex endometrial hyperplasia with atypia. These differ in terms of how abnormal the cells are and how likely it is that the condition will become cancer.
  endometrial stromal sarcoma: (EN-doh-MEE-tree-ul STROH-mul sar-KOH-muh)
    Pronunciation of dictionary term "endometrial stromal sarcoma"
    A rare type of cancer that forms in the connective tissue of the lining of the uterus. It may also form in the ovaries, cervix, and vagina, but this is very uncommon. Endometrial stromal sarcomas may be low grade or high grade, depending on how abnormal the cancer cells look under a microscope and how quickly the cancer cells are likely to grow and spread. They usually occur before menopause in women between 40 and 50 years of age. Also called ESS.
    More Information
    - Uterine Sarcoma Treatment
  endometrioid adenocarcinoma: (EN-doh-MEE-tree-oyd A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "endometrioid adenocarcinoma"
    A type of cancer that usually forms in the glandular tissue of the endometrium (the lining of the uterus) or ovary but may also form in the fallopian tube, cervix, and vagina. The cancer cells tend to look similar to normal gland cells when viewed under a microscope. Endometrioid adenocarcinoma usually grows and spreads slowly, can be treated, and has a good prognosis (chance of recovery). It is the most common type of endometrial cancer. Also called endometrioid cancer.
  endometrioid cancer: (EN-doh-MEE-tree-oyd KAN-ser)
    Pronunciation of dictionary term "endometrioid cancer"
    A type of cancer that usually forms in the glandular tissue of the endometrium (the lining of the uterus) or ovary but may also form in the fallopian tube, cervix, and vagina. The cancer cells tend to look similar to normal gland cells when viewed under a microscope. Endometrioid cancer usually grows and spreads slowly, can be treated, and has a good prognosis (chance of recovery). It is the most common type of endometrial cancer. Also called endometrioid adenocarcinoma.
  endometriosis: (EN-doh-MEE-tree-OH-sis)
    Pronunciation of dictionary term "endometriosis"
    A benign condition in which tissue that looks like endometrial tissue grows in abnormal places in the abdomen.
  endometrium: (en-doh-MEE-tree-um)
    Pronunciation of dictionary term "endometrium"
    The layer of tissue that lines the uterus.
    More Information
    - Uterine Cancer (https://www.cancer.gov/types/uterine)
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  EndoPat: (EN-doh-pat)
    Pronunciation of dictionary term "EndoPat"
    A medical device that tests to see if endothelial cells are damaged. Endothelial cells line the inner walls of blood vessels, lymph vessels, and the heart, and damage to them may be an early sign of heart disease. EndoPat looks for heart disease by using sensors that measure blood flow through a patient’s fingers. It is also being used to check blood vessels in patients treated for breast cancer. Also called Endo-Pat 2000.
  endoplasmic reticulum: (EN-doh-PLAZ-mik reh-TIH-kyoo-lum)
    Pronunciation of dictionary term "endoplasmic reticulum"
    A network of sac-like structures and tubes in the cytoplasm (gel-like fluid) of a cell. Proteins and other molecules move through the endoplasmic reticulum. The outer surface of the endoplasmic reticulum can be smooth or rough. The rough endoplasmic reticulum has many ribosomes on its outer surface and makes proteins the cell needs. The smooth endoplasmic reticulum makes other substances that the cell needs, such as lipids (fats) and carbohydrates (sugars). The endoplasmic reticulum is a cell organelle.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  endorectal ultrasound: (en-doh-REK-tul UL-truh-sownd)
    Pronunciation of dictionary term "endorectal ultrasound"
    A procedure in which a probe that sends out high-energy sound waves is inserted into the rectum. The sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissue called a sonogram. Endorectal ultrasound is used to look for abnormalities in the rectum and nearby structures, including the prostate. Also called ERUS, transrectal ultrasound, and TRUS.
    Transrectal ultrasound. An ultrasound probe is inserted into the rectum to check the prostate. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the prostate.
    Transrectal ultrasound; drawing shows a side view of the male reproductive and urinary system anatomy, including the bladder and prostate. Also shown is the rectum and anus. There is also an ultrasound probe inserted into the rectum to check the prostate. An inset shows a provider inserting the ultrasound probe into the patient's rectum while viewing an image of the ultrasound on a computer screen. The patient is lying on their back on a table.
  endorphin: (en-DOR-fin)
    Pronunciation of dictionary term "endorphin"
    One of several substances made in the body that can relieve pain and give a feeling of well-being. Endorphins are peptides (small proteins) that bind to opioid receptors in the central nervous system. An endorphin is a type of neurotransmitter.
  endoscope: (EN-doh-SKOPE)
    Pronunciation of dictionary term "endoscope"
    A thin, tube-like instrument used to look at tissues inside the body. An endoscope has a light and a lens for viewing and may have a tool to remove tissue.
  endoscopic mucosal resection: (en-doh-SKAH-pik myoo-KOH-sul ree-SEK-shun)
    Pronunciation of dictionary term "endoscopic mucosal resection"
    A procedure that uses an endoscope to remove abnormal growths or tissue from the lining of the digestive tract without open surgery. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. The endoscope may be passed through the mouth into the esophagus, stomach, or upper part of the small intestine, or it may be passed through the anus into the colon. Special tools are then inserted through the endoscope to remove the abnormal tissue, which will be checked under a microscope for signs of disease. Sometimes suction is used to remove the abnormal tissue, or a solution is injected around the abnormal tissue to separate it from other tissue before it is removed. Endoscopic mucosal resection may be used to help diagnose and treat early-stage cancers of the esophagus, stomach, small intestine, colon, or rectum. It may also be used to treat Barrett esophagus or other precancerous conditions of the digestive tract.
  endoscopic retrograde cholangiopancreatography: (en-doh-SKAH-pik REH-troh-grayd koh-LAN-jee-oh-PAN-kree-uh-TAH-gruh-fee)
    Pronunciation of dictionary term "endoscopic retrograde cholangiopancreatography"
    A procedure that uses an endoscope to examine and x-ray the pancreatic duct, hepatic duct, common bile duct, duodenal papilla, and gallbladder. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. The endoscope is passed through the mouth and down into the first part of the small intestine (duodenum). A smaller tube (catheter) is then inserted through the endoscope into the bile and pancreatic ducts. A dye is injected through the catheter into the ducts, and an x-ray is taken. Also called ERCP.
  endoscopic ultrasound: (en-doh-SKAH-pik UL-truh-sownd)
    Pronunciation of dictionary term "endoscopic ultrasound"
    A procedure in which an endoscope is inserted into the body. An endoscope is a thin, tube-like instrument that has a light and a lens for viewing. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal organs to make a picture (sonogram). Also called endosonography and EUS.
  endoscopic ultrasound-guided fine needle aspiration: (en-doh-SKAH-pik UL-truh-sownd-GY-ded … NEE-dul AS-pih-RAY-shun)
    Pronunciation of dictionary term "endoscopic ultrasound-guided fine needle aspiration"
    A procedure to take a sample of tissue for examination under a microscope. An endoscope with an ultrasound probe and a biopsy needle at the end is inserted through the mouth into the esophagus. An endoscope is a thin, tube-like instrument that has a light and a lens for viewing. The ultrasound probe is used to bounce high-energy sound waves off internal organs and tissues to make a picture on a monitor. This picture helps the doctor see where to place the biopsy needle. Also called EUS-FNA.
    Endoscopic ultrasound-guided fine-needle aspiration biopsy. An endoscope that has an ultrasound probe and a biopsy needle is inserted through the mouth and into the esophagus. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the lymph nodes near the esophagus. The sonogram helps the doctor see where to place the biopsy needle to remove tissue from the lymph nodes. This tissue is checked under a microscope for signs of cancer.
    Endoscopic ultrasound-guided fine-needle aspiration biopsy; drawing shows an endoscope with an ultrasound probe and biopsy needle inserted through the mouth and into the esophagus. Also shown are the lymph nodes near the esophagus and cancer in one lung. An inset shows the ultrasound probe locating the lymph nodes with cancer and the biopsy needle removing tissue from one of the lymph nodes near the esophagus.
  endoscopy: (en-DOS-koh-pee)
    Pronunciation of dictionary term "endoscopy"
    A procedure that uses an endoscope to examine the inside of the body. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
  endosonography: (EN-doh-soh-NAH-gruh-fee)
    Pronunciation of dictionary term "endosonography"
    A procedure in which an endoscope is inserted into the body. An endoscope is a thin, tube-like instrument that has a light and a lens for viewing. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal organs to make a picture (sonogram). Also called endoscopic ultrasound and EUS.
  endostatin: (EN-doh-STA-tin)
    Pronunciation of dictionary term "endostatin"
    A substance being studied in the treatment of cancer. Endostatin is made from a type of collagen (a protein found in cartilage and other connective tissue). It may prevent the growth of new blood vessels that tumors need to grow. Endostatin is a type of antiangiogenesis agent. Also called COL18A1.
  endothelial cell: (EN-doh-THEE-lee-ul sel)
    Pronunciation of dictionary term "endothelial cell"
    The main type of cell found in the inside lining of blood vessels, lymph vessels, and the heart.
  endothelin receptor antagonist: (EN-doh-THEE-lin reh-SEP-ter an-TA-guh-nist)
    Pronunciation of dictionary term "endothelin receptor antagonist"
    A drug that blocks the hormone endothelin and may prevent prostate cancer from spreading to the bones. It may also prevent the growth and spread of other types of cancer, including colorectal cancer.
  endothelin-1 protein receptor antagonist: (EN-doh-THEE-lin-1 PROH-teen reh-SEP-ter an-TA-guh-nist)
    Pronunciation of dictionary term "endothelin-1 protein receptor antagonist"
    A substance that blocks the binding of the endothelin-1 protein to its receptor. Endothelin-1 is a small molecule that causes changes in blood vessels and helps regulate blood pressure. It can also stimulate the growth of some types of cells.
  endpoint: (END-poynt)
    Pronunciation of dictionary term "endpoint"
    In clinical trials, an event or outcome that can be measured objectively to determine whether the intervention being studied is beneficial. The endpoints of a clinical trial are usually included in the study objectives. Some examples of endpoints are survival, improvements in quality of life, relief of symptoms, and disappearance of the tumor.
  enema: (EH-neh-muh)
    Pronunciation of dictionary term "enema"
    The injection of a liquid through the anus into the large bowel.
  energy balance: (EH-ner-jee BA-lunts)
    Pronunciation of dictionary term "energy balance"
    In biology, the state at which the number of calories eaten equals the number of calories used. Energy balance is affected by physical activity, body size, amount of body fat and muscle, and genetics.
    More Information
    - Obesity (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity)
  energy healing: (EH-ner-jee HEEL-ing)
    Pronunciation of dictionary term "energy healing"
    A form of complementary and alternative medicine based on the belief that a vital energy flows through the human body. The goal of energy healing is to balance the energy flow in the patient. It is used to reduce stress and anxiety and promote well-being. Energy healing is being studied in patients receiving cancer therapy, to find out if it can improve quality of life, boost the immune system, or reduce side effects. Also called energy therapy.
  energy therapy: (EH-ner-jee THAYR-uh-pee)
    Pronunciation of dictionary term "energy therapy"
    A form of complementary and alternative medicine based on the belief that a vital energy flows through the human body. The goal of energy therapy is to balance the energy flow in the patient. It is used to reduce stress and anxiety and promote well-being. Energy therapy is being studied in patients receiving cancer therapy, to find out if it can improve quality of life, boost the immune system, or reduce side effects. Also called energy healing.
  enfortumab vedotin: (en-FOR-too-mab veh-DOH-tin)
    Pronunciation of dictionary term "enfortumab vedotin"
    A drug used alone or with pembrolizumab to treat adults with certain types of urothelial cancer (a type of cancer in the bladder or urinary tract) that have spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Enfortumab vedotin contains a monoclonal antibody that binds to a protein called nectin-4, which is found on some cancer cells. It also contains an anticancer drug, which may help kill cancer cells. Enfortumab vedotin may also help the immune system kill cancer cells. It is a type of antibody-drug conjugate. Also called Padcev.
    More Information
    - Enfortumab Vedotin-ejfv (https://www.cancer.gov/about-cancer/treatment/drugs/enfortumabvedotin-ejfv)
  English chamomile: (... KA-muh-mile)
    Pronunciation of dictionary term "English chamomile"
    A type of chamomile plant with daisy-like white flowers that is found in Europe, North America, and Argentina. The dried flowers are used in teas to calm and relax, to improve sleep, and to help with stomach problems. Its essential oil (scented liquid taken from plants) is used in perfumes, shampoos, face creams, lotions, and aromatherapy. The scientific names are Chamaemelum nobile and Anthemis nobilis. Also called Roman chamomile.
  English lavender: (ING-lish LA-ven-der)
    Pronunciation of dictionary term "English lavender"
    A plant with aromatic leaves and flowers that is a member of the mint family. Oil from the flowers has been used in some cultures to treat certain medical problems, to keep insects away, and to wash in. It is also used in aromatherapy. Perillyl alcohol, a substance found in English lavender, is being studied in cancer prevention and treatment. The scientific name is Lavandula angustifolia. Also called lavender and true lavender.
  Enhertu: (en-HER-too)
    Pronunciation of dictionary term "Enhertu"
    A drug used to treat adults with certain types of HER2-positive or HER2-low breast cancer, HER2-positive stomach cancer, gastroesophageal junction cancer, or other solid tumor, or non-small cell lung cancer that has a certain mutation in the HER2 gene. It is also being studied in the treatment of other types of cancer. Enhertu contains a monoclonal antibody called trastuzumab that binds to a protein called HER2, which is found on some cancer cells. It also contains an anticancer drug called deruxtecan, which may help kill cancer cells. Enhertu is a type of antibody-drug conjugate. Also called fam-trastuzumab deruxtecan and trastuzumab deruxtecan.
    More Information
    - Fam-Trastuzumab Deruxtecan-nxki (https://www.cancer.gov/about-cancer/treatment/drugs/famtrastuzumabderuxtecan-nxki)
  eniluracil: (EH-nil-YOOR-uh-sil)
    Pronunciation of dictionary term "eniluracil"
    An anticancer drug that increases the effectiveness of fluorouracil. Also called ethynyluracil.
  enlarged prostate: (en-LARGD PROS-tayt)
    Pronunciation of dictionary term "enlarged prostate"
    A benign (not cancer) condition in which the prostate gland is larger than normal. As the prostate gets bigger, it may press against the bladder and urethra, which can slow or block the flow of urine from the bladder. This can cause urinary symptoms, such as feeling a need to urinate often or right away, waking up many times during the night to urinate, trouble urinating, leaking urine, pain during urination or after ejaculation (the release of semen through the penis during orgasm), and blood in the urine. An enlarged prostate does not increase a person’s risk of developing prostate cancer. However, if not treated, it can lead to a weak bladder, urinary retention, urinary tract infections, bladder stones, or bladder or kidney damage. An enlarged prostate is most common in older men. Also called benign prostatic hyperplasia, benign prostatic hypertrophy, and BPH.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
    Normal prostate and benign prostatic hyperplasia (BPH). A normal prostate does not block the flow of urine from the bladder. An enlarged prostate presses on the bladder and urethra and blocks the flow of urine.
    Two-panel drawing shows normal male reproductive and urinary anatomy and benign prostatic hyperplasia (BPH). Panel on the left shows the normal prostate and flow of urine from the bladder through the urethra. Panel on the right shows an enlarged prostate pressing on the bladder and urethra, blocking the flow of urine.
  enoxaparin: (ee-NOK-suh-PAYR-in)
    Pronunciation of dictionary term "enoxaparin"
    A drug used to prevent blood clots. It belongs to the family of drugs called anticoagulants.
  enriched food: (in-RICHT…)
    Pronunciation of dictionary term "enriched food"
    A food that has nutrients added back that were lost during processing. Examples are bread, pasta, and other products made from white flour that have B vitamins added back.
  Ensacove: (EN-suh-kove)
    Pronunciation of dictionary term "Ensacove"
    A drug used to treat adults with non-small cell lung cancer that is ALK positive, has spread, and has not been treated with an ALK inhibitor. It is also being studied in the treatment of other types of cancer. Ensacove blocks certain proteins made by the ALK gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called ensartinib hydrochloride.
  ensartinib hydrochloride: (en-SAR-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "ensartinib hydrochloride"
    A drug used to treat adults with non-small cell lung cancer that is ALK positive, has spread, and has not been treated with an ALK inhibitor. It is also being studied in the treatment of other types of cancer. Ensartinib hydrochloride blocks certain proteins made by the ALK gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called Ensacove.
  Ensure: (en-SHER)
    Pronunciation of dictionary term "Ensure"
    A type of nutrition drink that may help people who cannot get all the nutrients they need from foods and other drinks. Ensure has vitamins, minerals, protein, and fats. It may be added to a person’s diet to help build strong bones, rebuild muscle and strength, and help the body heal after injury or surgery. Ensure may be taken by mouth or given through tube feeding. Ensure is a type of polymeric enteral nutrition formula and a type of dietary supplement.
  ENT doctor: (… DOK-ter)
    Pronunciation of dictionary term "ENT doctor"
    A doctor who has special training in diagnosing and treating diseases of the ear, nose, and throat. Also called otolaryngologist.
  enteral nutrition: (EN-teh-rul noo-TRIH-shun)
    Pronunciation of dictionary term "enteral nutrition"
    A form of nutrition that is delivered into the digestive system as a liquid. Drinking nutrition beverages or formulas and tubefeeding are forms of enteral nutrition. People who are unable to meet their needs with food and beverages alone, and who do not have vomiting or uncontrollable diarrhea may be given tubefeedings. Tubefeeding can be used to add to what a person is able to eat or can be the only source of nutrition. A small feeding tube may be placed through the nose into the stomach or the small intestine, or it may be surgically placed into the stomach or the intestinal tract through an opening made on the outside of the abdomen, depending on how long it will be used.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  enterostomal therapist: (EN-teh-roh-STOH-mul THAYR-uh-pist)
    Pronunciation of dictionary term "enterostomal therapist"
    A health professional trained in the care of persons with stomas, such as colostomies or urostomies.
  entinostat: (en-tih-NOH-stat)
    Pronunciation of dictionary term "entinostat"
    A substance being studied in the treatment of several types of cancer. It blocks enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase (HDAC) inhibitor. Also called HDAC inhibitor SNDX-275 and SNDX-275.
  entrectinib: (en-TREK-tih-nib)
    Pronunciation of dictionary term "entrectinib"
    A drug used in adults to treat non-small cell lung cancer that has spread and is ROS1 positive and in adults and children aged 1 month and older to treat certain types of solid tumors that have an NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Entrectinib blocks certain proteins involved in cell signaling and cell growth. Blocking these proteins may help keep cancer cells from growing and may kill them. Entrectinib is a type of tyrosine kinase inhibitor. Also called Rozlytrek.
    More Information
    - Entrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/entrectinib)
  enucleation: (ee-NOO-klee-AY-shun)
    Pronunciation of dictionary term "enucleation"
    In medicine, the removal of an organ or tumor in such a way that it comes out clean and whole, like a nut from its shell.
  enveloped virus: (EN-veh-lupt VY-rus)
    Pronunciation of dictionary term "enveloped virus"
    A virus that has an outer wrapping or envelope. This envelope comes from the infected cell, or host, in a process called "budding off." During the budding process, newly formed virus particles become "enveloped" or wrapped in an outer coat that is made from a small piece of the cell's plasma membrane. The envelope may play a role in helping a virus survive and infect other cells.
  environmental exposure: (en-VY-run-MEN-tul ek-SPOH-zher)
    Pronunciation of dictionary term "environmental exposure"
    Having contact with chemical, biological, or physical substances found in air, water, food, or soil that may have a harmful effect on a person’s health. Examples of environmental exposures include UV radiation from the sun and cigarette smoke, radon, or other forms of air pollution. A person may also be exposed to harmful substances by swallowing food or water that is contaminated with bacteria or pesticides or by absorbing harmful chemicals through the skin. The amount of harm caused by an environmental exposure depends on the amount of the exposure, the way a person is exposed, and how long a person is exposed. Some types of environmental exposures may increase the risk of certain diseases, such as lung disease, heart disease, and cancer, and may also lead to birth defects.
  environmental tobacco smoke: (en-VY-run-MEN-tul tuh-BA-koh ...)
    Pronunciation of dictionary term "environmental tobacco smoke"
    Smoke that comes from the burning of a tobacco product and smoke that is exhaled by smokers. Inhaling environmental tobacco smoke is called involuntary or passive smoking. Also called ETS and secondhand smoke.
    More Information
    - Secondhand Smoke and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/second-hand-smoke-fact-sheet)
  enzalutamide: (EN-zuh-LOO-tuh-mide)
    Pronunciation of dictionary term "enzalutamide"
    A drug used to treat certain types of prostate cancer. It is also being studied in the treatment of other types of cancer. Enzalutamide binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Enzalutamide blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called Xtandi.
    More Information
    - Enzalutamide (https://www.cancer.gov/about-cancer/treatment/drugs/enzalutamide)
  enzastaurin: (en-zuh-STAW-rin)
    Pronunciation of dictionary term "enzastaurin"
    A substance being studied in the treatment of certain types of cancer, including non-Hodgkin lymphoma, breast, colon, lung, ovarian, and prostate. Enzastaurin blocks certain cell signaling pathways, and may prevent the growth of new blood vessels that tumors need to grow. It is a type of serine threonine kinase inhibitor and a type of antiangiogenesis agent. Also called enzastaurin hydrochloride and LY317615.
  enzastaurin hydrochloride: (en-zuh-STAW-rin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "enzastaurin hydrochloride"
    A substance being studied in the treatment of certain types of cancer, including non-Hodgkin lymphoma, breast, colon, lung, ovarian, and prostate. Enzastaurin hydrochloride blocks certain cell signaling pathways, and may prevent the growth of new blood vessels that tumors need to grow. It is a type of serine threonine kinase inhibitor and a type of antiangiogenesis agent. Also called LY317615.
  enzyme: (EN-zime)
    Pronunciation of dictionary term "enzyme"
    A protein that speeds up chemical reactions in the body.
  enzyme inhibitor: (EN-zime in-HIH-bih-ter)
    Pronunciation of dictionary term "enzyme inhibitor"
    A substance that blocks the action of an enzyme. Enzymes help speed up chemical reactions in the body and take part in many cell functions, including cell signaling, growth, and division. In cancer treatment, enzyme inhibitors may be used to block certain enzymes that cancer cells need to grow.
  enzyme-linked immunosorbent assay: (EN-zime-linkt IH-myoo-noh-SOR-bent A-say)
    Pronunciation of dictionary term "enzyme-linked immunosorbent assay"
    A laboratory technique that uses antibodies linked to enzymes to detect and measure the amount of a substance in a solution, such as serum. The test is done using a solid surface to which the antibodies and other molecules stick. In the final step, an enzyme reaction takes place that causes a color change that can be read using a special machine. There are many different ways that an enzyme-linked immunosorbent assay can be done. Enzyme-linked immunosorbent assays may be used to help diagnose certain diseases. Also called ELISA.
  EOB: A summary of the costs of a medical treatment or other health care service that an insurance company may send to a patient after the patient has received the service. An EOB usually includes the date the patient received the service, how much the service cost, how much the health insurance plan paid, and how much the patient may need to pay the health care provider. Also called explanation of benefits.
  eosinophil: (EE-oh-SIH-noh-FIL)
    Pronunciation of dictionary term "eosinophil"
    A type of immune cell that has granules (small particles) with enzymes that are released during infections, allergic reactions, and asthma. An eosinophil is a type of white blood cell and a type of granulocyte.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  eosinophilia: (EE-oh-SIH-noh-FIH-lee-uh)
    Pronunciation of dictionary term "eosinophilia"
    A condition in which the number of eosinophils (a type of white blood cell) in the blood is greatly increased. Eosinophilia is often a response to infection or allergens (substances that cause an allergic response).
  EP-2101: A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called cancer vaccines.
  epcoritamab: (EP-koh-RIH-tah-mab)
    Pronunciation of dictionary term "epcoritamab"
    A drug used to treat adults with certain types of diffuse large B-cell lymphoma, high-grade B-cell lymphoma, or follicular lymphoma that came back or did not get better after treatment with at least two other systemic therapies. It is also being studied in the treatment of other types of cancer. Epcoritamab binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called CD20, which is found on B cells (another type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Epcoritamab is a type of bispecific T-cell engager. Also called Epkinly.
    More Information
    - Epcoritamab-bysp (https://www.cancer.gov/about-cancer/treatment/drugs/epcoritamab-bysp)
  ependyma: (eh-PEN-dih-muh)
    Pronunciation of dictionary term "ependyma"
    A thin membrane that lines the fluid-filled spaces in the brain and spinal cord. It is made up of a type of glial cell called an ependymal cell.
  ependymal cell: (eh-PEN-dih-mul sel)
    Pronunciation of dictionary term "ependymal cell"
    A cell that forms the lining of the fluid-filled spaces in the brain and spinal cord. It is a type of glial cell.
  ependymal tumor: (eh-PEN-dih-mul TOO-mer)
    Pronunciation of dictionary term "ependymal tumor"
    A type of glioma that begins in ependymal cells, which line the fluid-filled spaces in the brain and spinal cord and make cerebrospinal fluid. Ependymal tumors can form anywhere in the brain or spinal cord, but they usually form in the lower back part of the brain in children and in the spinal cord in adults. These tumors can occur at any age but are more common in young children. They can be low grade or high grade, determined by how abnormal the tumor cells look under a microscope and how quickly the tumor is likely to grow, spread, and come back after treatment. Most ependymal tumors are low grade, meaning they tend to grow and spread within the brain and spinal cord slowly. They rarely spread outside the brain and spinal cord. Childhood ependymal tumors often come back after treatment. Also called ependymoma.
    More Information
    - Childhood Ependymoma
    - Ependymoma: Diagnosis and Treatment (https://www.cancer.gov/rare-brain-spine-tumor/tumors/ependymoma)
    Anatomy of the inside of the brain showing the lateral ventricle, third ventricle, fourth ventricle, and the passageways between the ventricles (with cerebrospinal fluid shown in blue). Also shown are the cerebrum, cerebellum, brain stem (pons and medulla), and spinal cord.
    Drawing of the inside of the brain showing the lateral ventricle, third ventricle, fourth ventricle, and the passageways between the ventricles (with cerebrospinal fluid shown in blue). Also shown are the cerebrum, cerebellum, brain stem (pons and medulla), and spinal cord.
  ependymoma: (eh-PEN-dih-MOH-muh)
    Pronunciation of dictionary term "ependymoma"
    A type of glioma that begins in ependymal cells, which line the fluid-filled spaces in the brain and spinal cord and make cerebrospinal fluid. Ependymomas can form anywhere in the brain or spinal cord, but they usually form in the lower back part of the brain in children and in the spinal cord in adults. These tumors can occur at any age but are more common in young children. They can be low grade or high grade, determined by how abnormal the tumor cells look under a microscope and how quickly the tumor is likely to grow, spread, and come back after treatment. Most ependymomas are low grade, meaning they tend to grow and spread within the brain and spinal cord slowly. They rarely spread outside the brain and spinal cord. Childhood ependymomas often come back after treatment. Also called ependymal tumor.
    More Information
    - Childhood Ependymoma
    - Ependymoma: Diagnosis and Treatment (https://www.cancer.gov/rare-brain-spine-tumor/tumors/ependymoma)
    Anatomy of the inside of the brain showing the lateral ventricle, third ventricle, fourth ventricle, and the passageways between the ventricles (with cerebrospinal fluid shown in blue). Also shown are the cerebrum, cerebellum, brain stem (pons and medulla), and spinal cord.
    Drawing of the inside of the brain showing the lateral ventricle, third ventricle, fourth ventricle, and the passageways between the ventricles (with cerebrospinal fluid shown in blue). Also shown are the cerebrum, cerebellum, brain stem (pons and medulla), and spinal cord.
  ephedra: (eh-FEH-druh)
    Pronunciation of dictionary term "ephedra"
    A shrub native to China and India. The stems and roots are used in traditional medicine as a diuretic and for asthma, bronchitis, and cough. It has also been promoted as a decongestant, a weight loss aid, and as a supplement to increase energy. Ephedra may cause high blood pressure, increased heart rate, or death if used with certain drugs, and may reduce the effects of certain drugs used to treat cancer and other diseases. The U.S. Food and Drug Administration has banned the sale of dietary supplements that contain ephedra. The scientific name is Ephedra sinica. Also called ma huang.
  epidemiologist: (EH-pih-DEE-mee-AH-loh-jist)
    Pronunciation of dictionary term "epidemiologist"
    A scientist who studies the patterns, causes, and control of disease in groups of people.
  epidemiology: (EH-pih-dee-mee-AH-loh-jee)
    Pronunciation of dictionary term "epidemiology"
    The study of the patterns, causes, and control of disease in groups of people.
  epidermal growth factor: (eh-pih-DER-mul grothe FAK-ter)
    Pronunciation of dictionary term "epidermal growth factor"
    A protein made by many cells in the body and by some types of tumors. It causes cells to grow and differentiate (become more specialized). It is a type of growth factor and a type of cytokine. Also called EGF.
  epidermal growth factor receptor: (eh-pih-DER-mul grothe FAK-ter reh-SEP-ter)
    Pronunciation of dictionary term "epidermal growth factor receptor"
    A protein found on certain types of cells that binds to a substance called epidermal growth factor. The epidermal growth factor receptor protein is involved in cell signaling pathways that control cell division and survival. Sometimes, mutations (changes) in the EGFR gene cause epidermal growth factor receptor proteins to be made in higher than normal amounts on some types of cancer cells. This causes cancer cells to divide more rapidly. Drugs that block epidermal growth factor receptor proteins are being used in the treatment of some types of cancer. Epidermal growth factor receptors are a type of receptor tyrosine kinase. Also called EGFR, ErbB1, and HER1.
  epidermal growth factor receptor gene: (eh-pih-DER-mul grothe FAK-ter reh-SEP-ter jeen)
    Pronunciation of dictionary term "epidermal growth factor receptor gene"
    A gene that makes a protein that is involved in cell growth and cell survival. Mutated (changed) forms of the epidermal growth factor receptor gene and protein have been found in some types of cancer, including non-small cell lung cancer. These changes may cause cancer cells to grow and spread in the body. Checking for changes in the epidermal growth factor receptor gene in tumor tissue may help plan cancer treatment. Also called EGFR gene, ERBB1 gene, and HER1 gene.
  epidermal growth factor receptor inhibitor: (eh-pih-DER-mul grothe FAK-ter reh-SEP-ter in-HIH-bih-ter)
    Pronunciation of dictionary term "epidermal growth factor receptor inhibitor"
    A substance that blocks the activity of a protein called epidermal growth factor receptor (EGFR). EGFR is found on the surface of some normal cells and is involved in cell growth. It may also be found at high levels on some types of cancer cells, which causes these cells to grow and divide. Blocking EGFR may keep cancer cells from growing. Some epidermal growth factor receptor inhibitors are used to treat cancer. Also called EGFR inhibitor, EGFR tyrosine kinase inhibitor, and epidermal growth factor receptor tyrosine kinase inhibitor.
  epidermal growth factor receptor tyrosine kinase inhibitor: (eh-pih-DER-mul grothe FAK-ter reh-SEP-ter TY-ruh-seen KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "epidermal growth factor receptor tyrosine kinase inhibitor"
    A substance that blocks the activity of a protein called epidermal growth factor receptor (EGFR). EGFR is found on the surface of some normal cells and is involved in cell growth. It may also be found at high levels on some types of cancer cells, which causes these cells to grow and divide. Blocking EGFR may keep cancer cells from growing. Some epidermal growth factor receptor tyrosine kinase inhibitors are used to treat cancer. Also called EGFR inhibitor, EGFR tyrosine kinase inhibitor, and epidermal growth factor receptor inhibitor.
  epidermis: (EH-pih-DER-mis)
    Pronunciation of dictionary term "epidermis"
    The outer layer of the two main layers of the skin.
    Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue.
    Skin anatomy; drawing shows layers of the epidermis, dermis, and subcutaneous tissue including hair shafts and follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and a sweat gland.
  epidermodysplasia verruciformis: (EH-pih-der-moh-dis-PLAY-zhuh veh-ROO-sih-for-mis)
    Pronunciation of dictionary term "epidermodysplasia verruciformis"
    A rare, inherited disorder that makes people susceptible to chronic infection with certain types of human papillomavirus (HPV). It causes wart-like lesions or reddish-brown scaly patches to form most often on the skin of the face, neck, hands, arms, legs, feet, and trunk. Epidermodysplasia verruciformis usually appears at an early age and can get worse over time. People with this disorder have a high risk of developing nonmelanoma skin cancer at an early age, especially squamous cell skin cancer. Epidermodysplasia verruciformis is caused by mutations (changes) in the EVER1/TMC6 or EVER2/TMC8 genes.
    More Information
    - Epidermodysplasia verruciformis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6357/epidermodysplasia-verruciformis)
  epidermoid carcinoma: (EH-pih-DER-moyd KAR-sih-NOH-muh)
    Pronunciation of dictionary term "epidermoid carcinoma"
    Cancer that begins in squamous cells. Squamous cells are thin, flat cells that look like fish scales, and are found in the tissue that forms the surface of the skin, the lining of the hollow organs of the body, and the lining of the respiratory and digestive tracts. Most cancers of the anus, cervix, head and neck, and vagina are epidermoid carcinomas. Also called squamous cell carcinoma.
  epidermolysis bullosa: (EH-pih-der-MAH-lih-sis buh-LOH-suh)
    Pronunciation of dictionary term "epidermolysis bullosa"
    A group of chronic skin disorders in which fluid-filled blisters form on the skin and mucosa (the moist, inner lining of some organs and body cavities). Epidermolysis bullosa is inherited and usually starts at birth. Patients with epidermolysis bullosa may be at increased risk of squamous cell cancer of the skin.
    More Information
    - Epidermolysis bullosa (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6359/epidermolysis-bullosa)
    - Epidermolysis bullosa (MedlinePlus) (https://medlineplus.gov/ency/article/001457.htm)
  epidermolysis bullosa simplex, Dowling-Meara: (EH-pih-der-MAH-lih-sis buh-LOH-suh SIM-plex, DOW-ling-MEER-uh)
    Pronunciation of dictionary term "epidermolysis bullosa simplex, Dowling-Meara"
    A rare, inherited disorder in which many clusters of blisters form all over the body, especially on the face, hands, feet, arms, legs, and trunk. Blisters may also form in the inner lining of the mouth and other parts of the gastrointestinal tract and the upper respiratory tract. Other signs and symptoms include scarring, changes in skin color, nail problems, and thickening of the skin on the palms of the hands and bottoms of the feet. The signs and symptoms usually appear at birth and tend to get better over time. However, infants with a severe form of the disease die within the first year of life. People with epidermolysis bullosa simplex, Dowling-Meara have a high risk of developing basal cell skin cancer by age 55 years. Epidermolysis bullosa simplex, Dowling-Meara is caused by mutations (changes) in the KRT5 or KRT14 genes. Also called EBS-DM.
    More Information
    - Epidermolysis bullosa simplex, Dowling-Meara type (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2141/epidermolysis-bullosa-simplex-dowling-meara-type)
    - Epidermolysis bullosa simplex (MedlinePlus) (https://medlineplus.gov/genetics/condition/epidermolysis-bullosa-simplex/)
  epididymis: (eh-pih-DIH-dih-mis)
    Pronunciation of dictionary term "epididymis"
    A narrow, tightly-coiled tube that is attached to each of the testicles (the male sex glands that produce sperm). Sperm cells (male reproductive cells) move from the testicles into the epididymis, where they finish maturing and are stored.
    Anatomy of the male reproductive system. The male reproductive system is made up of organs and glands involved in making offspring (children). These include the vas deferens (a long tube that carries sperm out of the testes), epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored), prostate gland, penis, and testes.
    Anatomy of the male reproductive system; drawing shows the vas deferens (a long tube that carries sperm out of the testes), prostate gland, penis, and testes. An inset shows the vas deferens and epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored).
  epidural: (EH-pih-DER-ul)
    Pronunciation of dictionary term "epidural"
    Having to do with the space between the wall of the spinal canal and the covering of the spinal cord. An epidural injection is given into this space.
  epidural block: (EH-pih-DER-ul blok)
    Pronunciation of dictionary term "epidural block"
    An injection of an anesthetic drug into the space between the wall of the spinal canal and the covering of the spinal cord.
  epigallocatechin-3-gallate: (EH-pih-ga-loh-KA-teh-kin-3-GA-layt)
    Pronunciation of dictionary term "epigallocatechin-3-gallate"
    A substance found in green tea. It is being studied in the prevention of cancer and some other diseases. It is a type of antioxidant. Also called EGCG.
  epigastric: (EH-pih-GAS-trik)
    Pronunciation of dictionary term "epigastric"
    Having to do with the upper middle area of the abdomen.
  epigenetic alteration: (EH-pih-jeh-NEH-tik ALL-teh-RAY-shun)
    Pronunciation of dictionary term "epigenetic alteration"
    A change in the chemical structure of DNA that does not change the DNA coding sequence. Epigenetic alterations occur in the body when chemical groups called methyl groups are added to or removed from DNA or when changes are made to proteins called histones that bind to the DNA in chromosomes. These changes may occur with age and exposure to environmental factors, such as diet, exercise, drugs, and chemicals. They can affect a person’s risk of disease and may be passed from parent to child. Also called epigenetic variant and epimutation.
  epigenetic variant: (EH-pih-jeh-NEH-tik VAYR-ee-unt)
    Pronunciation of dictionary term "epigenetic variant"
    A change in the chemical structure of DNA that does not change the DNA coding sequence. Epigenetic variants occur in the body when chemical groups called methyl groups are added to or removed from DNA or when changes are made to proteins called histones that bind to the DNA in chromosomes. These changes may occur with age and exposure to environmental factors, such as diet, exercise, drugs, and chemicals. They can affect a person’s risk of disease and may be passed from parent to child. Also called epigenetic alteration and epimutation.
  epigenetics: (EH-pih-jeh-NEH-tix)
    Pronunciation of dictionary term "epigenetics"
    The study of how age and exposure to environmental factors, such as diet, exercise, drugs, and chemicals, may cause changes in the way genes are switched on and off without changing the actual DNA sequence. These changes can affect a person’s risk of disease and may be passed from parents to their children.
    More Information
    - Epigenetics (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=528)
  epigenomics: (EH-pih-jeh-NOH-mix)
    Pronunciation of dictionary term "epigenomics"
    The study of all of the epigenetic changes in a cell. Epigenetic changes are changes in the way genes are switched on and off without changing the actual DNA sequence. They may be caused by age and exposure to environmental factors, such as diet, exercise, drugs, and chemicals. Epigenetic changes can affect a person’s risk of disease and may be passed from parents to their children.
  epiglottis: (eh-pih-GLAH-tis)
    Pronunciation of dictionary term "epiglottis"
    The flap that covers the trachea during swallowing so that food does not enter the lungs.
    Anatomy of the larynx. The three parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.
    Anatomy of the larynx; drawing shows the epiglottis, supraglottis, glottis, subglottis, and vocal cords. Also shown are the tongue, trachea, and esophagus.
  epilepsy: (EH-pih-LEP-see)
    Pronunciation of dictionary term "epilepsy"
    A group of disorders marked by problems in the normal functioning of the brain. These problems can produce seizures, unusual body movements, a loss of consciousness or changes in consciousness, as well as mental problems or problems with the senses.
  epimutation: (EH-pih-myoo-TAY-shun)
    Pronunciation of dictionary term "epimutation"
    A change in the chemical structure of DNA that does not change the DNA coding sequence. Epimutations occur in the body when chemical groups called methyl groups are added to or removed from DNA or when changes are made to proteins called histones that bind to the DNA in chromosomes. These changes may occur with age and exposure to environmental factors, such as diet, exercise, drugs, and chemicals. They can affect a person’s risk of disease and may be passed from parent to child. Also called epigenetic alteration and epigenetic variant.
  epinephrine: (eh-pih-NEH-frin)
    Pronunciation of dictionary term "epinephrine"
    A hormone and neurotransmitter. Also called adrenaline.
  epipodophyllotoxin: (EH-pih-POH-doh-FIH-loh-TOK-sin)
    Pronunciation of dictionary term "epipodophyllotoxin"
    A substance being studied in the treatment of some types of cancer. Epipodophyllotoxin is extracted from the mandrake root Podophyllum peltatum. It is a type of topoisomerase inhibitor.
  epirubicin: (EH-pih-ROO-bih-sin)
    Pronunciation of dictionary term "epirubicin"
    A drug used with other drugs to treat breast cancer that was removed by surgery. It is used in patients whose cancer has spread to the lymph nodes under the arm. It is also being studied in the treatment of other types of cancer. Epirubicin blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called Ellence and epirubicin hydrochloride.
    More Information
    - Epirubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/epirubicinhydrochloride)
  epirubicin hydrochloride: (EH-pih-ROO-bih-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "epirubicin hydrochloride"
    A drug used with other drugs to treat breast cancer that was removed by surgery and has spread to the lymph nodes under the arm. It is also being studied in the treatment of other types of cancer. Epirubicin hydrochloride blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Epirubicin is the active ingredient of epirubicin hydrochloride. Also called Ellence.
    More Information
    - Epirubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/epirubicinhydrochloride)
  episcleritis: (EH-pih-skleh-RY-tis)
    Pronunciation of dictionary term "episcleritis"
    A condition in which the thin layer of tissue that covers the sclera (the white part of the eye) becomes inflamed. The cause is usually not known, but it may occur with certain inflammatory conditions, such as lupus and rheumatoid arthritis. Signs and symptoms include redness, swelling, tenderness, mild pain in the eye, and sensitivity to light. Episcleritis usually does not affect vision and often goes away without treatment. Also called bulbar conjunctivitis.
  episodic breathlessness: (EH-pih-SAH-dik BRETH-les-nes)
    Pronunciation of dictionary term "episodic breathlessness"
    A medical condition in which patients have periods of trouble breathing that are followed by periods with no trouble breathing. Episodic breathlessness is seen in patients with lung cancer or other lung diseases, and in some heart conditions.
  epithelial: (eh-pih-THEE-lee-ul)
    Pronunciation of dictionary term "epithelial"
    Refers to the cells that line the internal and external surfaces of the body.
  epithelial carcinoma: (eh-pih-THEE-lee-ul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "epithelial carcinoma"
    Cancer that begins in the cells that line an organ.
  epithelial ovarian cancer: (eh-pih-THEE-lee-ul oh-VAYR-ee-un KAN-ser)
    Pronunciation of dictionary term "epithelial ovarian cancer"
    Cancer that forms in the tissue covering the ovary (one of a pair of female reproductive glands in which eggs are made). Most ovarian cancers are epithelial ovarian cancers. Fallopian tube cancer and primary peritoneal cancer are similar to epithelial ovarian cancer and are staged and treated the same way. Also called ovarian epithelial cancer.
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
  epithelioid hemangioendothelioma: (eh-pih-THEE-lee-oyd hee-MAN-jee-oh-EN-doh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "epithelioid hemangioendothelioma"
    A rare blood vessel tumor that usually forms in the liver, lung, or bone, but it can also form on or in the skin. Epithelioid hemangioendotheliomas may be slow growing or fast growing and, in some people, may spread to other parts of the body very quickly. Signs and symptoms depend on where the tumor is in the body. On the skin, the tumor may be raised with round or flat, red-brown patches that feel warm. In the lung, the tumor can cause chest pain, trouble breathing, spitting up blood, and anemia. In the bone, the tumor can cause breaks. Epithelioid hemangioendotheliomas usually occur in adults, but can sometimes occur in children. They are a type of vascular tumor and a type of soft tissue sarcoma.
  epithelioid hemangioma: (eh-pih-THEE-lee-oyd hee-MAN-jee-OH-muh)
    Pronunciation of dictionary term "epithelioid hemangioma"
    A rare benign (not cancer) tumor of small blood vessels surrounded by lymphocytes and eosinophils (types of white blood cells). Epithelioid hemangioma usually forms on or in the skin, especially the skin of the head, but can occur in other areas of the body, such as in bone. On the skin, it may appear as firm pink to red bumps that may be itchy or painful. If the tumor is in bone, it may cause swelling and pain. Epithelioid hemangioma is sometimes caused by injury and often comes back after treatment. Epithelioid hemangioma is most common in young and middle-aged adults. It is a type of vascular tumor. Also called angiolymphoid hyperplasia with eosinophilia and histiocytoid hemangioma.
  epithelioid sarcoma: (eh-pih-THEE-lee-oyd sar-KOH-muh)
    Pronunciation of dictionary term "epithelioid sarcoma"
    A rare type of cancer that usually begins as a slow-growing, firm lump in the deep soft tissue or skin of the arms, hands, or fingers. It may also occur in the legs, trunk (chest and abdomen), or head and neck. The lump is usually painless and there may be an ulcer in the skin covering the lump. Epithelioid sarcoma may spread to nearby tissue, lymph nodes, or other parts of the body. It often recurs (comes back) after treatment. Epithelioid sarcoma usually occurs in young adults. It is a type of soft tissue sarcoma.
  epithelium: (eh-pih-THEE-lee-um)
    Pronunciation of dictionary term "epithelium"
    A thin layer of tissue that covers organs, glands, and other structures within the body.
  epitope: (EH-pih-tope)
    Pronunciation of dictionary term "epitope"
    A part of a molecule that an antibody will recognize and bind to.
  Epkinly: (ep-KIN-lee)
    Pronunciation of dictionary term "Epkinly"
    A drug used to treat adults with certain types of diffuse large B-cell lymphoma, high-grade B-cell lymphoma, or follicular lymphoma that came back or did not get better after treatment with at least two other systemic therapies. It is also being studied in the treatment of other types of cancer. Epkinly binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called CD20, which is found on B cells (another type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Epkinly is a type of bispecific T-cell engager. Also called epcoritamab.
    More Information
    - Epcoritamab-bysp (https://www.cancer.gov/about-cancer/treatment/drugs/epcoritamab-bysp)
  EPO906: A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called epothilones. Also called epothilone B.
  EPOCH: An abbreviation for a chemotherapy combination used to treat aggressive forms of non-Hodgkin lymphoma, including mantle cell lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, and doxorubicin hydrochloride (hydroxydaunorubicin). Also called EPOCH regimen.
    More Information
    - EPOCH (https://www.cancer.gov/about-cancer/treatment/drugs/EPOCH)
  EPOCH regimen: (… REH-jih-men)
    Pronunciation of dictionary term "EPOCH regimen"
    An abbreviation for a chemotherapy combination used to treat aggressive forms of non-Hodgkin lymphoma, including mantle cell lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, and doxorubicin hydrochloride (hydroxydaunorubicin). Also called EPOCH.
    More Information
    - EPOCH (https://www.cancer.gov/about-cancer/treatment/drugs/EPOCH)
  EPOCH-O: An abbreviation for a chemotherapy combination used to treat non-Hodgkin lymphoma, including Burkitt lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), and ofatumumab. Also called EPOCH-O regimen.
  EPOCH-O regimen: (… REH-jih-men)
    Pronunciation of dictionary term "EPOCH-O regimen"
    An abbreviation for a chemotherapy combination used to treat non-Hodgkin lymphoma, including Burkitt lymphoma. It includes the drugs etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), and ofatumumab. Also called EPOCH-O.
  EPOCH-R: An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs rituximab, etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, and doxorubicin hydrochloride (hydroxydaunorubicin). Also called EPOCH-R regimen, R-EPOCH, and R-EPOCH regimen.
    More Information
    - R-EPOCH (https://www.cancer.gov/about-cancer/treatment/drugs/R-EPOCH)
  EPOCH-R regimen: (... REH-jih-men)
    Pronunciation of dictionary term "EPOCH-R regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs rituximab, etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, and doxorubicin hydrochloride (hydroxydaunorubicin). Also called EPOCH-R, R-EPOCH, and R-EPOCH regimen.
    More Information
    - R-EPOCH (https://www.cancer.gov/about-cancer/treatment/drugs/R-EPOCH)
  epoetin alfa: (ee-POH-ee-tin AL-fuh)
    Pronunciation of dictionary term "epoetin alfa"
    A drug used to treat anemia caused by chronic kidney disease, some types of chemotherapy, and an antiviral drug for HIV infection called zidovudine. It is also used to lower the number of donor blood transfusions needed during and after certain types of surgery. Epoetin alfa is a form of erythropoietin (a substance naturally made by the kidneys) that is made in the laboratory. It helps the bone marrow make more red blood cells. Epoetin alfa is a type of antianemic and a type of erythropoiesis-stimulating agent. Also called Epogen, Procrit, and Retacrit.
    More Information
    - Epoetin Alfa (https://www.cancer.gov/about-cancer/treatment/drugs/epoetinalfa)
  epoetin beta: (ee-POH-eh-tin BAY-tuh)
    Pronunciation of dictionary term "epoetin beta"
    A substance that is made in the laboratory and stimulates the bone marrow to make red blood cells. It is a type of antianemic and a type of recombinant human erythropoietin.
  Epogen: (EE-poh-jen)
    Pronunciation of dictionary term "Epogen"
    A drug used to treat anemia caused by chronic kidney disease, some types of chemotherapy, and an antiviral drug for HIV infection called zidovudine. It is also used to lower the number of donor blood transfusions needed during and after certain types of surgery. Epogen is a form of erythropoietin (a substance naturally made by the kidneys) that is made in the laboratory. It helps the bone marrow make more red blood cells. Epogen is a type of antianemic and a type of erythropoiesis-stimulating agent. Also called epoetin alfa, Procrit, and Retacrit.
    More Information
    - Epoetin Alfa (https://www.cancer.gov/about-cancer/treatment/drugs/epoetinalfa)
  epothilone: (eh-POTH-ih-lone)
    Pronunciation of dictionary term "epothilone"
    A substance obtained from bacteria that interferes with cell division. Some epothilones are being studied as treatments for cancer.
  epothilone B: (eh-POTH-ih-lone ...)
    Pronunciation of dictionary term "epothilone B"
    A substance being studied in the treatment of cancer. It is a type of epothilone. Also called EPO906.
  epothilone D: (eh-POTH-ih-lone ...)
    Pronunciation of dictionary term "epothilone D"
    A substance being studied in the treatment of cancer. It is a type of mitotic inhibitor and epothilone. Also called KOS-862.
  epothilone ZK219477: (eh-POTH-ih-lone ...)
    Pronunciation of dictionary term "epothilone ZK219477"
    A form of the substance epothilone that is made in the laboratory. It is being studied in the treatment of some types of cancer. Epothilone ZK2219477 stops the growth of tumor cells by blocking cell division. It is a type of antimitotic agent.
  epratuzumab: (EH-pruh-TOO-zoo-mab)
    Pronunciation of dictionary term "epratuzumab"
    A substance being studied in the treatment of certain types of non-Hodgkin lymphoma (NHL) and acute lymphoblastic leukemia (ALL). It is also being studied in the treatment of an autoimmune disease called systemic lupus erythematosus (SLE). Epratuzumab binds to a protein called CD22, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help suppress the body’s immune response and it may help kill cancer cells. Epratuzumab is a type of monoclonal antibody.
  Epstein-Barr virus: (ep-stine-BAR VY-rus)
    Pronunciation of dictionary term "Epstein-Barr virus"
    A common virus that remains dormant in most people. Epstein-Barr virus causes infectious mononucleosis and has been associated with certain cancers, including Burkitt lymphoma, immunoblastic lymphoma, nasopharyngeal cancer, and stomach (gastric) cancer. Also called EBV.
    More Information
    - Oral Cavity and Nasopharyngeal Cancers Screening
  EPT: Treatment that generates electrical pulses through an electrode placed in a tumor to enhance the ability of anticancer drugs to enter tumor cells. Also called electroporation therapy.
  ER: A protein found inside the cells of the female reproductive tissue, some other types of tissue, and some cancer cells. The hormone estrogen will bind to the receptors inside the cells and may cause the cells to grow. Also called estrogen receptor.
  ER negative: (... NEH-guh-tiv)
    Pronunciation of dictionary term "ER negative"
    Describes cells that do not have a protein that binds to the hormone estrogen. Cancer cells that are ER negative do not need estrogen to grow. This means that they will keep growing when estrogen is not present and do not stop growing when treated with substances that block estrogen from binding. Also called estrogen receptor negative.
  ER positive: (... PAH-zih-tiv)
    Pronunciation of dictionary term "ER positive"
    Describes cells that have a protein that binds to the hormone estrogen. Cancer cells that are ER positive may need estrogen to grow. These cells may stop growing or die when treated with substances that block the binding and actions of estrogen. Also called estrogen receptor positive.
  ER-negative PR-negative HER2/neu-negative breast cancer: (... NEH-guh-tiv ... NEH-guh-tiv ... NEH-guh-tiv brest KAN-ser)
    Pronunciation of dictionary term "ER-negative PR-negative HER2/neu-negative breast cancer"
    A type of breast cancer in which the tumor cells do not have estrogen receptors, progesterone receptors, or large amounts of HER2/neu protein on their surface. Knowing whether breast cancer is triple negative is important in planning treatment. Also called TNBC and triple-negative breast cancer.
    Triple-negative breast cancer is a type of breast cancer in which the cancer cells do not have estrogen receptors, progesterone receptors, or large amounts of HER2/neu protein on their surface.
    Drawing showing a triple-negative breast cancer cell with the estrogen receptor, progesterone receptor, and HER2 proteins crossed out with a black "X" mark. This means that the breast cancer cell does not have these proteins.
  ERA-923: A substance that is being studied as a treatment for cancer. It belongs to a family of drugs called antiestrogens.
  erb-38 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "erb-38 immunotoxin"
    A toxic substance linked to an antibody that attaches to tumor cells and kills them.
  ErbB1: A protein found on certain types of cells that binds to a substance called epidermal growth factor. The ErbB1 protein is involved in cell signaling pathways that control cell division and survival. Sometimes, mutations (changes) in the EGFR gene cause ErbB1 proteins to be made in higher than normal amounts on some types of cancer cells. This causes cancer cells to divide more rapidly. Drugs that block ErbB1 proteins are being used in the treatment of some types of cancer. ErbB1s are a type of receptor tyrosine kinase. Also called EGFR, epidermal growth factor receptor, and HER1.
  ERBB1 gene: (… jeen)
    Pronunciation of dictionary term "ERBB1 gene"
    A gene that makes a protein that is involved in cell growth and cell survival. Mutated (changed) forms of the ERBB1 gene and protein have been found in some types of cancer, including non-small cell lung cancer. These changes may cause cancer cells to grow and spread in the body. Checking for changes in the ERBB1 gene in tumor tissue may help plan cancer treatment. Also called EGFR gene, epidermal growth factor receptor gene, and HER1 gene.
  Erbitux: (ER-bih-tux)
    Pronunciation of dictionary term "Erbitux"
    A drug used alone or with other drugs to treat certain types of head and neck cancer and colorectal cancer. It is also being studied in the treatment of other types of cancer. Erbitux binds to a protein called EGFR, which is found on some types of cancer cells. This may help keep cancer cells from growing. Erbitux is a type of monoclonal antibody. Also called cetuximab.
    More Information
    - Cetuximab (https://www.cancer.gov/about-cancer/treatment/drugs/cetuximab)
  ERCC2 gene: (... jeen)
    Pronunciation of dictionary term "ERCC2 gene"
    A gene that makes a protein involved in the first step of making proteins and in repairing damaged DNA. Mutations (changes) in the ERCC2 gene may cause cells to lose their ability to repair damaged DNA, which may lead to abnormal cell growth. ERCC2 gene mutations have been found in several inherited syndromes, including a condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
    More Information
    - ERCC2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/ercc2/)
  ERCC3 gene: (... jeen)
    Pronunciation of dictionary term "ERCC3 gene"
    A gene that makes a protein involved in the first step of making proteins and in repairing damaged DNA. Mutations (changes) in the ERCC3 gene may cause cells to lose their ability to repair damaged DNA, which may lead to abnormal cell growth. ERCC3 gene mutations have been found in several inherited syndromes, including a condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
    More Information
    - ERCC3 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/ercc3/)
  ERCC4 gene: (... jeen)
    Pronunciation of dictionary term "ERCC4 gene"
    A gene that makes a protein involved in repairing damaged DNA. Mutations (changes) in the ERCC4 gene may cause cells to lose their ability to repair damaged DNA, which may lead to abnormal cell growth. ERCC4 gene mutations have been found in several inherited syndromes, including a condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
  ERCC5 gene: (... jeen)
    Pronunciation of dictionary term "ERCC5 gene"
    A gene that makes a protein involved in repairing damaged DNA. Mutations (changes) in the ERCC5 gene may cause cells to lose their ability to repair damaged DNA, which may lead to abnormal cell growth. ERCC5 gene mutations have been found in several inherited syndromes, including a condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
  ERCP: A procedure that uses an endoscope to examine and x-ray the pancreatic duct, hepatic duct, common bile duct, duodenal papilla, and gallbladder. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. The endoscope is passed through the mouth and down into the first part of the small intestine (duodenum). A smaller tube (catheter) is then inserted through the endoscope into the bile and pancreatic ducts. A dye is injected through the catheter into the ducts, and an x-ray is taken. Also called endoscopic retrograde cholangiopancreatography.
  erdafitinib: (ER-duh-FIH-tih-nib)
    Pronunciation of dictionary term "erdafitinib"
    A drug used to treat adults with urothelial cancer (a type of bladder or urinary tract cancer) that has spread and has an abnormal FGFR3 gene. It is used in patients whose cancer got worse during or after treatment with at least one type of systemic therapy. It is also being studied in the treatment of other types of cancer. Erdafitinib blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Balversa.
    More Information
    - Erdafitinib (https://www.cancer.gov/about-cancer/treatment/drugs/erdafitinib)
  Erdheim-Chester disease: (ERD-hime-CHEH-ster dih-ZEEZ)
    Pronunciation of dictionary term "Erdheim-Chester disease"
    A very rare disorder in which too many histiocytes (a type of white blood cell) build up in certain tissues and organs and damage them. Erdheim-Chester disease most often affects the long bones of the arms and legs, but it can also affect the skin, lungs, heart, kidneys, brain, tissue behind the eyes, and the retroperitoneum (the back wall of the abdomen). The symptoms can range from mild to severe and life-threatening. Erdheim-Chester disease is most common in adults. It is a type of histiocytosis. Also called ECD.
  erectile dysfunction: (eh-REK-tile dis-FUNK-shun)
    Pronunciation of dictionary term "erectile dysfunction"
    An inability to have an erection of the penis adequate for sexual intercourse. Also called impotence.
  erection: (eh-REK-shun)
    Pronunciation of dictionary term "erection"
    In medicine, the swelling of the penis with blood, causing it to become firm.
  ergocalciferol: (ER-goh-kal-SIH-feh-rol)
    Pronunciation of dictionary term "ergocalciferol"
    A form of vitamin D that helps the body use calcium and phosphorus to make strong bones and teeth. It is fat-soluble (can dissolve in fats and oils) and is found in plants and yeast. It can be made in the body from another form of vitamin D when the body is exposed to the sun. Ergocalciferol is also made in the laboratory. It is used to prevent and to treat vitamin D deficiency. It is a type of dietary supplement. Also called vitamin D2.
  eribulin mesylate: (er-eh-BYOO-lin MEH-zih-layt)
    Pronunciation of dictionary term "eribulin mesylate"
    A drug used to treat certain types of breast cancer and liposarcoma (a type of soft tissue sarcoma) that have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Eribulin mesylate blocks cell growth by stopping cell division and may kill cancer cells. It is a type of antimicrotubule agent. Also called E7389 and Halaven.
    More Information
    - Eribulin Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/eribulinmesylate)
  erismodegib: (AYR-is-MOH-deh-gib)
    Pronunciation of dictionary term "erismodegib"
    A drug used to treat locally advanced basal cell carcinoma (BCC) that has come back after surgery or radiation therapy. It is also used in patients who cannot be treated with surgery or radiation therapy. Erismodegib is also being studied in the treatment of other types of cancer. Erismodegib blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of hedgehog signaling pathway antagonist. Also called LDE225, Odomzo, and sonidegib phosphate.
    More Information
    - Sonidegib (https://www.cancer.gov/about-cancer/treatment/drugs/sonidegib)
  Erivedge: (AYR-ih-vej)
    Pronunciation of dictionary term "Erivedge"
    A drug used to treat basal cell carcinoma that has spread to other parts of the body, has come back after surgery, or that cannot be treated with surgery or radiation. It is also being studied in the treatment of other types of cancer. Erivedge blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of Hedgehog signaling pathway antagonist. Also called GDC-0449 and vismodegib.
    More Information
    - Vismodegib (https://www.cancer.gov/about-cancer/treatment/drugs/vismodegib)
  Erleada: (er-LEE-duh)
    Pronunciation of dictionary term "Erleada"
    A drug used to treat prostate cancer that has spread to other parts of the body and is castration sensitive (has responded to treatments that lower testosterone levels) and prostate cancer that has not spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). Erleada binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Erleada blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called apalutamide.
    More Information
    - Apalutamide (https://www.cancer.gov/about-cancer/treatment/drugs/apalutamide)
  erlotinib hydrochloride: (er-LOH-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "erlotinib hydrochloride"
    A drug used alone to treat certain types of non-small cell lung cancer and with gemcitabine hydrochloride to treat certain types of pancreatic cancer. It is also being studied in the treatment of other types of cancer. Erlotinib hydrochloride blocks a protein called EGFR, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called CP-358,774, OSI-774, and Tarceva.
    More Information
    - Erlotinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/erlotinibhydrochloride)
  ERMS: A soft tissue tumor that is most common in infants and young children. It begins in muscles, usually in the head, neck, or genitourinary tract. Also called embryonal rhabdomyosarcoma.
  ERT: Treatment with the hormone estrogen to increase the amount of estrogen in the body. It is given to women who have gone through menopause or to women who have early menopause caused by cancer treatment or by having their ovaries removed by surgery. ERT may help relieve symptoms of menopause, such as hot flashes, night sweats, vaginal dryness, and sleep problems. It may also help protect against osteoporosis (thinning of the bones) and lower the risk of breast cancer in postmenopausal women. Also called estrogen replacement therapy.
  eructation: (eer-ruk-TAY-shun)
    Pronunciation of dictionary term "eructation"
    The release of air or gas from the stomach or esophagus through the mouth. Eructation is usually caused by a buildup of air in the esophagus or upper part of the stomach when too much air is swallowed. This can occur when eating or drinking too fast, talking while eating, drinking carbonated drinks, chewing gum, smoking, or having an anxiety attack. Eructation may also be a side effect of certain medicines or a symptom of some gastrointestinal conditions and digestive problems, such as gastroesophageal reflux disease, gastritis, and stomach ulcers or infections. Also called belching and burping.
  ERUS: A procedure in which a probe that sends out high-energy sound waves is inserted into the rectum. The sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissue called a sonogram. ERUS is used to look for abnormalities in the rectum and nearby structures, including the prostate. Also called endorectal ultrasound, transrectal ultrasound, and TRUS.
    Transrectal ultrasound. An ultrasound probe is inserted into the rectum to check the prostate. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the prostate.
    Transrectal ultrasound; drawing shows a side view of the male reproductive and urinary system anatomy, including the bladder and prostate. Also shown is the rectum and anus. There is also an ultrasound probe inserted into the rectum to check the prostate. An inset shows a provider inserting the ultrasound probe into the patient's rectum while viewing an image of the ultrasound on a computer screen. The patient is lying on their back on a table.
  Erwinaze: (ER-wih-nayz)
    Pronunciation of dictionary term "Erwinaze"
    A drug that contains the active ingredient asparaginase Erwinia chrysanthemi and is used with other drugs to treat acute lymphoblastic leukemia. It is used in people who cannot take the enzyme asparaginase that comes from the bacterium E. coli. It is also being studied in the treatment of other types of cancer. Erwinaze breaks down the amino acid asparagine and may stop the growth of cancer cells that need asparagine to grow. It may also kill cancer cells. Erwinaze is a type of protein synthesis inhibitor.
    More Information
    - Asparaginase Erwinia Chrysanthemi (https://www.cancer.gov/about-cancer/treatment/drugs/asparaginase-erwinia-chrysanthemi)
  erythema: (AYR-ih-THEE-muh)
    Pronunciation of dictionary term "erythema"
    Redness of the skin.
  erythrocyte: (eh-RITH-roh-site)
    Pronunciation of dictionary term "erythrocyte"
    A type of blood cell that is made in the bone marrow and found in the blood. Erythrocytes contain a protein called hemoglobin, which carries oxygen from the lungs to all parts of the body. Checking the number of erythrocytes in the blood is usually part of a complete blood cell (CBC) test. It may be used to look for conditions such as anemia, dehydration, malnutrition, and leukemia. Also called RBC and red blood cell.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  erythrocyte sedimentation rate: (eh-RITH-roh-site SEH-dih-men-TAY-shun ...)
    Pronunciation of dictionary term "erythrocyte sedimentation rate"
    The distance red blood cells travel in one hour in a sample of blood as they settle to the bottom of a test tube. The sedimentation rate is increased in inflammation, infection, cancer, rheumatic diseases, and diseases of the blood and bone marrow. Also called ESR and sedimentation rate.
  erythrodysplasia: (eh-RITH-roh-dis-PLAY-zhuh)
    Pronunciation of dictionary term "erythrodysplasia"
    A condition in which immature red blood cells (erythroid cells) in the bone marrow are abnormal in size, shape, organization, and/or number. Erythrodysplasia may be caused by vitamin deficiency or chemotherapy, or it may be a sign of refractory anemia, which is a myelodysplastic syndrome. Also called erythroid dysplasia.
  erythrogenesis imperfecta: (eh-RITH-roh-JEH-neh-sis IM-per-FEK-tuh)
    Pronunciation of dictionary term "erythrogenesis imperfecta"
    A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with erythrogenesis imperfecta may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called Blackfan–Diamond anemia, congenital hypoplastic anemia, congenital pure red cell aplasia, DBA, Diamond-Blackfan anemia, and inherited erythroblastopenia.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  erythroid dysplasia: (eh-RITH-royd dis-PLAY-zhuh)
    Pronunciation of dictionary term "erythroid dysplasia"
    A condition in which immature red blood cells (erythroid cells) in the bone marrow are abnormal in size, shape, organization, and/or number. Erythroid dysplasia may be caused by vitamin deficiency or chemotherapy, or it may be a sign of refractory anemia, which is a myelodysplastic syndrome. Also called erythrodysplasia.
  erythroleukemia: (eh-RITH-roh-loo-KEE-mee-uh)
    Pronunciation of dictionary term "erythroleukemia"
    Cancer of the blood-forming tissues in which large numbers of immature, abnormal red blood cells are found in the blood and bone marrow.
  erythroleukoplakia: (eh-RITH-roh-LOO-koh-PLAY-kee-uh)
    Pronunciation of dictionary term "erythroleukoplakia"
    An abnormal patch of red and white tissue that forms on mucous membranes in the mouth and may become cancer. Tobacco (smoking and chewing) and alcohol may increase the risk of erythroleukoplakia.
  erythroplakia: (eh-RITH-roh-PLAY-kee-uh)
    Pronunciation of dictionary term "erythroplakia"
    An abnormal patch of red tissue that usually forms on the inside of the mouth, especially on the tongue, inside of the cheek, and under the tongue. The patch often bleeds easily if it is scraped. Erythroplakia is most commonly caused by smoking or chewing tobacco, but it may also be caused by heavy alcohol use or poorly fitting dentures that rub against the tissues in the mouth. Most erythroplakias are benign (not cancer), but some may be precancerous or a sign of cancer.
  erythropoiesis: (eh-RITH-roh-poy-EE-sis)
    Pronunciation of dictionary term "erythropoiesis"
    The formation of red blood cells in blood-forming tissue. In the early development of a fetus, erythropoiesis takes place in the yolk sac, spleen, and liver. After birth, all erythropoiesis occurs in the bone marrow.
  erythropoiesis-stimulating agent: (eh-RITH-roh-poy-EE-sis-STIM-yoo-LAY-ting AY-jent)
    Pronunciation of dictionary term "erythropoiesis-stimulating agent"
    A substance that stimulates the bone marrow to make more red blood cells. Erythropoiesis-stimulating agents are used to treat anemia caused by chronic kidney failure, some anticancer drugs, and certain treatments for HIV. They may also be used to lower the number of blood transfusions needed during and after certain major surgeries. Examples of erythropoiesis-stimulating agents are epoetin alfa (Epogen, Procrit) and darbepoetin alfa (Aranesp). Also called ESA.
  erythropoietin: (eh-RITH-roh-POY-eh-tin)
    Pronunciation of dictionary term "erythropoietin"
    A substance that is naturally produced by the kidneys, and that stimulates the bone marrow to make red blood cells. When erythropoietin is made in the laboratory, it is called epoetin alfa or epoetin beta.
  ESA: A substance that stimulates the bone marrow to make more red blood cells. ESAs are used to treat anemia caused by chronic kidney failure, some anticancer drugs, and certain treatments for HIV. They may also be used to lower the number of blood transfusions needed during and after certain major surgeries. Examples of ESAs are epoetin alfa (Epogen, Procrit) and darbepoetin alfa (Aranesp). Also called erythropoiesis-stimulating agent.
  escitalopram: (es-sy-TA-loh-pram)
    Pronunciation of dictionary term "escitalopram"
    A drug used to treat depression and certain anxiety disorders. It belongs to the family of drugs called selective serotonin reuptake inhibitors (SSRIs). Also called Lexapro.
  esomeprazole: (EH-soh-MEH-pruh-zole)
    Pronunciation of dictionary term "esomeprazole"
    A drug that blocks acid from being made in the stomach. It is used to treat acid reflux disease and to prevent certain types of gastrointestinal ulcers. Esomeprazole is being studied in the prevention of esophageal cancer and in the treatment of other conditions, including side effects of chemotherapy. It is a type of anti-ulcer agent. Also called esomeprazole magnesium and Nexium.
  esomeprazole magnesium: (EH-soh-MEH-pruh-zole mag-NEE-zee-um)
    Pronunciation of dictionary term "esomeprazole magnesium"
    A drug that blocks acid from being made in the stomach. It is used to treat acid reflux disease and to prevent certain types of gastrointestinal ulcers. Esomeprazole magnesium is being studied in the prevention of esophageal cancer and in the treatment of other conditions, including side effects of chemotherapy. It is a type of anti-ulcer agent. Also called Nexium.
  esophageal: (ee-SAH-fuh-JEE-ul)
    Pronunciation of dictionary term "esophageal"
    Having to do with the esophagus, the muscular tube through which food passes from the throat to the stomach.
    More Information
    - Esophageal Cancer (https://www.cancer.gov/types/esophageal)
  esophageal cancer: (ee-SAH-fuh-JEE-ul KAN-ser)
    Pronunciation of dictionary term "esophageal cancer"
    Cancer that forms in tissues lining the esophagus (the muscular tube through which food passes from the throat to the stomach). Two types of esophageal cancer are squamous cell carcinoma (cancer that begins in flat cells lining the esophagus) and adenocarcinoma (cancer that begins in cells that make and release mucus and other fluids).
    More Information
    - Esophageal Cancer (https://www.cancer.gov/types/esophageal)
    The esophagus and stomach are part of the upper gastrointestinal (digestive) system.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.
  esophageal reflux: (ee-SAH-fuh-JEE-ul REE-flux)
    Pronunciation of dictionary term "esophageal reflux"
    The backward flow of stomach acid contents into the esophagus (the tube that connects the mouth to the stomach). Also called gastric reflux and gastroesophageal reflux.
  esophageal speech: (ee-SAH-fuh-JEE-ul...)
    Pronunciation of dictionary term "esophageal speech"
    Speech produced by trapping air in the esophagus and forcing it out again. It is used after removal of a person's larynx (voice box).
  esophageal stent: (ee-SAH-fuh-JEE-ul stent)
    Pronunciation of dictionary term "esophageal stent"
    A tube placed in the esophagus to keep a blocked area open so the patient can swallow soft food and liquids. Esophageal stents are made of metal mesh, plastic, or silicone, and may be used in the treatment of esophageal cancer.
    Esophageal stent. A device (stent) is placed in the esophagus to keep it open to allow food and liquids to pass through into the stomach.
    Esophageal stent. Shows cancer blocking esophagus. Insets show enlarged area of cancer and a stent placed in the esophagus to keep it open.
  esophagectomy: (ee-SAH-fuh-JEK-toh-mee)
    Pronunciation of dictionary term "esophagectomy"
    An operation to remove a portion of the esophagus.
    Esophagectomy. A portion of the esophagus is removed and the stomach is pulled up and joined to the remaining esophagus.
    Three-panel drawing showing esophageal cancer surgery; first panel shows area of esophagus with cancer, middle panel shows cancer and nearby tissue removed, last panel shows the stomach pulled up and joined to the remaining esophagus.
  esophagitis: (ee-SAH-fuh-JY-tis)
    Pronunciation of dictionary term "esophagitis"
    Inflammation of the esophagus (the tube that carries food from the mouth to the stomach).
  esophagogastroduodenoscopy: (ee-SAH-fuh-goh-GAS-troh-DOO-ah-deh-NOS-koh-pee)
    Pronunciation of dictionary term "esophagogastroduodenoscopy"
    A procedure in which an endoscope is passed through the mouth and down the throat into esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is a thin tube with a light and a video camera attached. It may also have a tool to remove a sample of cells, tissue, or fluid so it can be checked under a microscope for signs of disease. An esophagogastroduodenoscopy may be used to help diagnose cancer and other conditions, such as Barrett esophagus (a precancerous condition), ulcers, gastroesophageal reflux disease, and celiac disease. It may also be used to remove polyps or other types of growths, stop bleeding caused by ulcers or other conditions, widen a narrow esophagus, place a feeding tube or drainage tube, or remove foreign objects. Also called EGD, upper endoscopy, upper gastrointestinal endoscopy, and upper GI endoscopy.
    Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.
    Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.
  esophagoscopy: (ee-SAH-fuh-GOS-koh-pee)
    Pronunciation of dictionary term "esophagoscopy"
    Examination of the esophagus using an esophagoscope. An esophagoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
    Esophagoscopy. A thin, lighted tube is inserted through the mouth and into the esophagus to look for abnormal areas.
    Esophagoscopy; shows endoscope inserted through the mouth and into the esophagus. Inset shows patient on table having an esophagoscopy.
  esophagram: (ee-SAH-fuh-gram)
    Pronunciation of dictionary term "esophagram"
    A series of x-ray pictures of the esophagus taken after a patient drinks a liquid containing barium sulfate (a form of the silver-white metallic element barium). The barium sulfate coats and outlines the inner wall of the esophagus so that it can be seen on the x-ray pictures. Also called contrast esophagram.
    Barium swallow for esophageal cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as esophageal cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. The inset x-ray image shows a narrowing at the end of the esophagus caused by cancer.
  esophagus: (ee-SAH-fuh-gus)
    Pronunciation of dictionary term "esophagus"
    The muscular tube through which food passes from the throat to the stomach.
    More Information
    - Esophageal Cancer (https://www.cancer.gov/types/esophageal)
    The esophagus and stomach are part of the upper gastrointestinal (digestive) system.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.
  ESR: The distance red blood cells travel in one hour in a sample of blood as they settle to the bottom of a test tube. The sedimentation rate is increased in inflammation, infection, cancer, rheumatic diseases, and diseases of the blood and bone marrow. Also called erythrocyte sedimentation rate and sedimentation rate.
  ESR1 gene: (... jeen)
    Pronunciation of dictionary term "ESR1 gene"
    A gene that makes one of the two main types of estrogen receptor (ER) proteins. These proteins bind to and receive signals from the hormone estrogen. They are found inside the cells of female reproductive tissue, breast tissue, and many other types of tissue, and some cancer cells. Once activated by estrogen, ER proteins control the activity of certain genes that play an important role in cell growth and metabolism, sexual development, pregnancy, and other reproductive functions. Mutations (changes) in the ESR1 gene can cause the ER protein to be too active or found in higher-than-normal amounts on or in some types of cancer cells, such as breast or endometrial cancer cells. This may cause cancer cells to grow and spread. It may also make cancer cells not respond to certain anticancer drugs. The protein made by the ESR1 gene is a type of nuclear hormone receptor and a type of transcription factor.
  ESS: A rare type of cancer that forms in the connective tissue of the lining of the uterus. It may also form in the ovaries, cervix, and vagina, but this is very uncommon. ESSs may be low grade or high grade, depending on how abnormal the cancer cells look under a microscope and how quickly the cancer cells are likely to grow and spread. They usually occur before menopause in women between 40 and 50 years of age. Also called endometrial stromal sarcoma.
    More Information
    - Uterine Sarcoma Treatment
  essential oil: (eh-SENT-shul oyl)
    Pronunciation of dictionary term "essential oil"
    The scented liquid taken from certain plants using steam or pressure. Essential oils contain the natural chemicals that give the plant its “essence” (specific odor and flavor). Essential oils are used in perfumes, food flavorings, medicine, and aromatherapy.
    More Information
    - Aromatherapy With Essential Oils
  essential thrombocythemia: (eh-SENT-shul THROM-boh-sy-THEE-mee-uh)
    Pronunciation of dictionary term "essential thrombocythemia"
    An increased number of thrombocytes (platelets) in the blood, without a known cause. Also called essential thrombocytosis.
  essential thrombocytosis: (eh-SENT-shul THROM-boh-sy-TOH-sis)
    Pronunciation of dictionary term "essential thrombocytosis"
    An increased number of thrombocytes (platelets) in the blood, without a known cause. Also called essential thrombocythemia.
  Essiac: (EH-see-ak)
    Pronunciation of dictionary term "Essiac"
    An herbal tea mixture that contains burdock root, Indian rhubarb root, sheep sorrel, and slippery elm bark. It has been claimed to remove toxins from the body, make the immune system stronger, relieve pain, control diabetes, treat AIDS, reduce tumor size, increase cancer survival, and improve quality of life. No clinical trial using Essiac in humans has been reported in a peer-reviewed, scientific journal, and the FDA has not approved the use of Essiac for the treatment of any medical conditions.
    More Information
    - Essiac/Flor Essence
  ester: (EH-ster)
    Pronunciation of dictionary term "ester"
    A chemical substance made when an acid and an alcohol combine and water is removed. Esters are found in essential oils (scented oils that come from plants).
  esterified estrogen: (eh-STAYR-ih-fide ES-truh-jin)
    Pronunciation of dictionary term "esterified estrogen"
    A form of estrogen that may have fewer side effects than other forms. Esterified estrogens are used to treat some types of cancer, including prostate cancer. They are also used to treat the symptoms of menopause, (such as hot flashes, vaginal dryness, or heavy and painful bleeding) and osteoporosis (loss of bone mass). It is a type of drug called hormone therapy.
  esthesioneuroblastoma: (es-THEE-zee-oh-NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "esthesioneuroblastoma"
    A rare type of cancer that forms in the tissues of the upper part of the nasal cavity (space inside the nose). This area is near the bone that separates the nasal cavity from the brain. These tissues are involved in the sense of smell. Esthesioneuroblastoma may spread from the nasal cavity to the bone around the eyes, the sinuses, the front part of the brain, or the lymph nodes in the neck. It is the most common type of nasal cavity tumor in children, especially in teens. Also called olfactory neuroblastoma.
    More Information
    - Childhood Esthesioneuroblastoma
    Esthesioneuroblastomas form in the olfactory nerve endings in the upper part of the nasal cavity. The olfactory nerves (sense of smell) pass through the many tiny holes in the bone at the base of the brain to the olfactory bulb. Esthesioneuroblastomas may spread from the nasal cavity to the nasal sinuses or to nearby tissue. They may also spread to the brain or to other parts of the body (not shown).
    Drawing shows areas of the body where esthesioneuroblastoma tumors may form, including the olfactory nerve endings, olfactory bulb, nasal cavity, nasal sinuses, and brain.
  estradiol: (es-truh-DY-ol)
    Pronunciation of dictionary term "estradiol"
    A form of the hormone estrogen.
  estramustine: (ES-truh-MUS-teen)
    Pronunciation of dictionary term "estramustine"
    A combination of the hormone estradiol (an estrogen) and nitrogen mustard (an anticancer drug). Used in the palliative therapy of prostate cancer.
  estrogen: (ES-truh-jin)
    Pronunciation of dictionary term "estrogen"
    A type of hormone made by the body that helps develop and maintain female sex characteristics and the growth of long bones. Estrogens can also be made in the laboratory. They may be used as a type of birth control and to treat symptoms of menopause, menstrual disorders, osteoporosis, and other conditions.
  estrogen blocker: (ES-truh-jin BLAH-ker)
    Pronunciation of dictionary term "estrogen blocker"
    A substance that keeps cells from making or using estrogen (a hormone that plays a role in female sex characteristics, the menstrual cycle, and pregnancy). Estrogen blockers may stop some cancer cells from growing and are used to prevent and treat breast cancer. They are also being studied in the treatment of other types of cancer. An estrogen blocker is a type of hormone antagonist. Also called antiestrogen.
  estrogen cream: (ES-truh-jin creem)
    Pronunciation of dictionary term "estrogen cream"
    A cream that contains the hormone estrogen. It is used to treat some symptoms of menopause, such as vaginal dryness and painful intercourse. It may also be used to treat certain types of urinary incontinence (inability to control the flow of urine from the bladder). Estrogen cream is usually applied to the vagina, vulva, or opening of the urethra. It may also be applied to the cervix in some women who have certain abnormal cell changes caused by low hormone levels. Treatment with estrogen cream usually helps make these abnormal cells go away.
  estrogen receptor: (ES-truh-jin reh-SEP-ter)
    Pronunciation of dictionary term "estrogen receptor"
    A protein found inside the cells of the female reproductive tissue, some other types of tissue, and some cancer cells. The hormone estrogen will bind to the receptors inside the cells and may cause the cells to grow. Also called ER.
  estrogen receptor negative: (ES-truh-jin reh-SEP-ter NEH-guh-tiv)
    Pronunciation of dictionary term "estrogen receptor negative"
    Describes cells that do not have a protein that binds to the hormone estrogen. Cancer cells that are estrogen receptor negative do not need estrogen to grow. This means that they will keep growing when estrogen is not present and do not stop growing when treated with substances that block estrogen from binding. Also called ER negative.
  estrogen receptor positive: (ES-truh-jin reh-SEP-ter PAH-zih-tiv)
    Pronunciation of dictionary term "estrogen receptor positive"
    Describes cells that have a protein that binds to the hormone estrogen. Cancer cells that are estrogen receptor positive may need estrogen to grow. These cells may stop growing or die when treated with substances that block the binding and actions of estrogen. Also called ER positive.
  estrogen receptor test: (ES-truh-jin reh-SEP-ter test)
    Pronunciation of dictionary term "estrogen receptor test"
    A lab test to find out if cancer cells have estrogen receptors (proteins to which estrogen will bind). If the cells have estrogen receptors, they may need estrogen to grow, and this may affect how the cancer is treated.
  estrogen replacement therapy: (ES-truh-jin reh-PLAYS-ment THAYR-uh-pee)
    Pronunciation of dictionary term "estrogen replacement therapy"
    Treatment with the hormone estrogen to increase the amount of estrogen in the body. It is given to women who have gone through menopause or to women who have early menopause caused by cancer treatment or by having their ovaries removed by surgery. Estrogen replacement therapy may help relieve symptoms of menopause, such as hot flashes, night sweats, vaginal dryness, and sleep problems. It may also help protect against osteoporosis (thinning of the bones) and lower the risk of breast cancer in postmenopausal women. Also called ERT.
  ET 743: A drug used to treat liposarcoma and leiomyosarcoma (types of soft tissue sarcoma) that cannot be removed by surgery or have spread to other parts of the body. It is used in patients who have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. ET 743 may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called ecteinascidin, trabectedin, and Yondelis.
    More Information
    - Trabectedin (https://www.cancer.gov/about-cancer/treatment/drugs/trabectedin)
  etanercept: (ee-TA-ner-cept)
    Pronunciation of dictionary term "etanercept"
    A drug that is commonly used to treat arthritis. It is also being studied in the treatment of cancer, and as a treatment for loss of appetite and weight loss in cancer patients. It belongs to the family of drugs called tumor necrosis factor (TNF) antagonists.
  etaracizumab: (eh-TAR-uh-SIH-zoo-mab)
    Pronunciation of dictionary term "etaracizumab"
    A substance being studied in the treatment of some types of cancer and other conditions. Etaracizumab binds to a protein on the surface of blood vessels and may prevent the growth of new blood vessels that tumors need to grow. It may also prevent the spread of cancer. It is a type of antiangiogenesis agent, a type of metastasis inhibitor, and a type of monoclonal antibody. Also called Abegrin, humanized monoclonal antibody MEDI-522, and MEDI-522.
  ethanol ablation: (EH-thuh-nol a-BLAY-shun)
    Pronunciation of dictionary term "ethanol ablation"
    An injection of ethanol (alcohol) through the skin directly into a tumor to kill cancer cells. Ultrasound or a CT scan is used to guide the needle into the tumor. Also called alcohol ablation, PEI, and percutaneous ethanol injection.
  etheylenediaminetetraacetic acid: (EH-thih-leen-DY-uh-meen-TEH-truh-uh-SEE-tik A-sid)
    Pronunciation of dictionary term "etheylenediaminetetraacetic acid"
    A chemical that binds certain metal ions, such as calcium, magnesium, lead, and iron. It is used in medicine to prevent blood samples from clotting and to remove calcium and lead from the body. It is also used to keep bacteria from forming a biofilm (thin layer stuck to a surface). It is a type of chelating agent. Also called edetic acid and EDTA.
  ethical: (EH-thih-kul)
    Pronunciation of dictionary term "ethical"
    Having to do with beliefs about what is right and wrong in terms of how people behave. Also called moral.
  ethical will: (EH-thih-kul …)
    Pronunciation of dictionary term "ethical will"
    A final personal message or document in which a person shares his or her thoughts, values, memories, life lessons, advice, and hopes for the future. The person may also ask for forgiveness and forgive others. An ethical will is not a legal document.
  ethiodized oil: (eh-THY-oh-dized oyl)
    Pronunciation of dictionary term "ethiodized oil"
    A form of poppy seed oil that contains iodine. Ethiodized oil is given by injection and builds up in the blood and lymph vessels in tumors. It is used for imaging (taking pictures) of the salivary glands and the lymph system. It is also being studied in the imaging of other organs such as the liver, lung, stomach, and thyroid. It is a type of diagnostic imaging agent. Also called Ethiodol, iodized oil, and Lipiodol.
  Ethiodol: (eh-THY-oh-dol)
    Pronunciation of dictionary term "Ethiodol"
    A form of poppy seed oil that contains iodine. Ethiodol is given by injection and builds up in the blood and lymph vessels in tumors. It is used for imaging (taking pictures) of the salivary glands and the lymph system. It is also being studied in the imaging of other organs such as the liver, lung, stomach, and thyroid. It is a type of diagnostic imaging agent. Also called ethiodized oil, iodized oil, and Lipiodol.
  ethmoid sinus: (ETH-moyd SY-nus)
    Pronunciation of dictionary term "ethmoid sinus"
    A type of paranasal sinus (a hollow space in the bones around the nose). Ethmoid sinuses are found in the spongy ethmoid bone in the upper part of the nose between the eyes. They are lined with cells that make mucus to keep the nose from drying out.
    Anatomy of the paranasal sinuses (spaces between the bones around the nose).
    Anatomy of the paranasal sinuses; drawing shows front and side views of the frontal sinus, ethmoid sinus, maxillary sinus, and sphenoid sinus. The nasal cavity and pharynx (throat) are also shown.
  ethnic group: (ETH-nik groop)
    Pronunciation of dictionary term "ethnic group"
    A group of people who share a similar culture (beliefs, values, and behaviors), language, religion, ancestry, or other characteristic that is often handed down from one generation to the next. They may come from the same country or live together in the same area. Examples of ethnic groups include Hispanics and Han Chinese. Some diseases or genetic conditions may be more common in certain ethnic groups than in others.
  ethnicity: (eth-NIH-sih-tee)
    Pronunciation of dictionary term "ethnicity"
    A term that refers to the social and cultural characteristics, backgrounds, or experiences shared by a group of people. These include language, religion, beliefs, values, and behaviors that are often handed down from one generation to the next. Some conditions or diseases, such as cancer, may be more common in certain ethnic groups than in others.
  ethylene oxide: (EH-thuh-leen OK-side)
    Pronunciation of dictionary term "ethylene oxide"
    A chemical used to make antifreeze, to clean medical equipment, and as a pesticide. It is also found in tobacco smoke. Being exposed to ethylene oxide can cause lung damage, headache, nausea, vomiting, diarrhea, and shortness of breath. Being exposed over a long time may increase the risk of certain types of cancer.
    More Information
    - Ethylene Oxide (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/ethylene-oxide)
  ethynyluracil: (eh-THY-nil-YOOR-uh-sil)
    Pronunciation of dictionary term "ethynyluracil"
    An anticancer drug that increases the effectiveness of fluorouracil. Also called eniluracil.
  Ethyol: (eh-THY-ol)
    Pronunciation of dictionary term "Ethyol"
    A drug used to help protect the kidneys in patients receiving cisplatin for advanced ovarian cancer and to help reduce dry mouth in patients receiving radiation therapy after surgery for head and neck cancer. Ethyol helps protect healthy tissue from some of the side effects caused by certain types of cancer treatment. It is a type of chemoprotective agent and a type of radioprotective agent. Also called amifostine.
    More Information
    - Amifostine (https://www.cancer.gov/about-cancer/treatment/drugs/amifostine)
  etidronate: (ee-tih-DROH-nayt)
    Pronunciation of dictionary term "etidronate"
    A drug that belongs to the family of drugs called bisphosphonates. Bisphosphonates are used as treatment for hypercalcemia (abnormally high levels of calcium in the blood) and for cancer that has spread to the bone (bone metastases).
  etiology: (EE-tee-AH-loh-jee)
    Pronunciation of dictionary term "etiology"
    The cause or origin of disease.
  Etopophos: (ee-toh-POH-fos)
    Pronunciation of dictionary term "Etopophos"
    A drug used with other drugs to treat small cell lung cancer and certain types of testicular cancer. It is also being studied in the treatment of other types of cancer. Etopophos blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of podophyllotoxin derivative and a type of topoisomerase inhibitor. Also called etoposide phosphate.
    More Information
    - Etoposide Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/etoposidephosphate)
  etoposide: (ee-toh-POH-side)
    Pronunciation of dictionary term "etoposide"
    The active ingredient in a drug used with other drugs to treat small cell lung cancer and certain types of testicular cancer. It is also being studied in the treatment of other types of cancer. Etoposide blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of podophyllotoxin derivative and a type of topoisomerase inhibitor. Also called VP-16.
    More Information
    - Etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
  etoposide phosphate: (ee-toh-POH-side FOS-fayt)
    Pronunciation of dictionary term "etoposide phosphate"
    A drug used with other drugs to treat small cell lung cancer and certain types of testicular cancer. It is also being studied in the treatment of other types of cancer. Etoposide phosphate blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of podophyllotoxin derivative and a type of topoisomerase inhibitor. Also called Etopophos.
    More Information
    - Etoposide Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/etoposidephosphate)
  ETS: Smoke that comes from the burning of a tobacco product and smoke that is exhaled by smokers. Inhaling ETS is called involuntary or passive smoking. Also called environmental tobacco smoke and secondhand smoke.
    More Information
    - Secondhand Smoke and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/second-hand-smoke-fact-sheet)
  eucalyptus: (YOO-kuh-LIP-tus)
    Pronunciation of dictionary term "eucalyptus"
    A type of evergreen tree that is a member of the myrtle family. Oil from the leaves is used in very small amounts in mouthwash and in medicines and candy used to treat and soothe sore throats and coughs. It has also been used in some cultures to treat many other medical problems. The scientific name is Eucalyptus globulus.
  Eulexin: (yoo-LEK-sin)
    Pronunciation of dictionary term "Eulexin"
    A drug used with another drug to treat certain types of prostate cancer. Eulexin binds to proteins called androgen receptors, which are found in some prostate cancer cells, and keeps androgens (male hormones) from binding to the receptors. This blocks the ability of androgens to cause prostate cancer cells to grow. Eulexin is a type of antiandrogen. Also called flutamide.
  euphoria: (yoo-FOR-ee-uh)
    Pronunciation of dictionary term "euphoria"
    A feeling of great happiness or well-being. Euphoria may be a side effect of certain drugs.
  EUS: A procedure in which an endoscope is inserted into the body. An endoscope is a thin, tube-like instrument that has a light and a lens for viewing. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal organs to make a picture (sonogram). Also called endoscopic ultrasound and endosonography.
  EUS-FNA: A procedure to take a sample of tissue for examination under a microscope. An endoscope with an ultrasound probe and a biopsy needle at the end is inserted through the mouth into the esophagus. An endoscope is a thin, tube-like instrument that has a light and a lens for viewing. The ultrasound probe is used to bounce high-energy sound waves off internal organs and tissues to make a picture on a monitor. This picture helps the doctor see where to place the biopsy needle. Also called endoscopic ultrasound-guided fine needle aspiration.
    Endoscopic ultrasound-guided fine-needle aspiration biopsy. An endoscope that has an ultrasound probe and a biopsy needle is inserted through the mouth and into the esophagus. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the lymph nodes near the esophagus. The sonogram helps the doctor see where to place the biopsy needle to remove tissue from the lymph nodes. This tissue is checked under a microscope for signs of cancer.
    Endoscopic ultrasound-guided fine-needle aspiration biopsy; drawing shows an endoscope with an ultrasound probe and biopsy needle inserted through the mouth and into the esophagus. Also shown are the lymph nodes near the esophagus and cancer in one lung. An inset shows the ultrasound probe locating the lymph nodes with cancer and the biopsy needle removing tissue from one of the lymph nodes near the esophagus.
  euthanasia: (YOO-thuh-NAY-zhuh)
    Pronunciation of dictionary term "euthanasia"
    An easy or painless death, or the intentional ending of the life of a person suffering from an incurable or painful disease at his or her request. Also called mercy killing.
  Evacet: (EH-vuh-set)
    Pronunciation of dictionary term "Evacet"
    A form of the anticancer drug doxorubicin that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than doxorubicin. Evacet is used to treat ovarian cancer, AIDS-related Kaposi sarcoma, and multiple myeloma in patients whose disease has not gotten better after treatment with other anticancer drugs. It may be used together with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Evacet is a type of anthracycline antitumor antibiotic. Also called Dox-SL, Doxil, doxorubicin hydrochloride liposome, LipoDox, and liposomal doxorubicin hydrochloride.
    More Information
    - Doxorubicin Hydrochloride Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicin-hydrochloride-liposome)
  evaluable disease: (ee-VAL-yoo-uh-bul dih-ZEEZ)
    Pronunciation of dictionary term "evaluable disease"
    Disease that cannot be measured directly by the size of the tumor but can be evaluated by other methods specific to a particular clinical trial.
  evaluable patients: (ee-VAL-yoo-uh-bul PAY-shunts)
    Pronunciation of dictionary term "evaluable patients"
    Patients whose response to a treatment can be measured because enough information has been collected.
  event-free survival: (eh-VENT … ser-VY-vul)
    Pronunciation of dictionary term "event-free survival"
    In cancer, the length of time after primary treatment for a cancer ends that the patient remains free of certain complications or events that the treatment was intended to prevent or delay. These events may include the return of the cancer or the onset of certain symptoms, such as bone pain from cancer that has spread to the bone. In a clinical trial, measuring the event-free survival is one way to see how well a new treatment works. Also called EFS.
  everolimus: (eh-veh-ROH-lih-mus)
    Pronunciation of dictionary term "everolimus"
    A drug used alone or with other drugs to treat certain types of breast cancer, kidney cancer, and pancreatic, lung, and gastrointestinal neuroendocrine tumors. It is used under the brand name Afinitor to treat these cancers and to treat a type of benign kidney tumor called renal angiomyolipoma and a type of benign brain tumor called subependymal giant cell astrocytoma in patients who have tuberous sclerosis. Everolimus is also used under the brand name Afinitor Disperz to treat subependymal giant cell astrocytoma and certain types of seizures in patients who have tuberous sclerosis. It is also used under the brand name Zortress to keep the body from rejecting a kidney or liver transplant. Everolimus is also being studied in the treatment of other conditions and types of cancer. It blocks a protein involved in cell division, which may help keep abnormal cells, including cancer cells, from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Everolimus also lowers the body’s immune response. It is a type of kinase inhibitor, a type of angiogenesis inhibitor, and a type of immunosuppressant. Also called RAD001.
    More Information
    - Everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
  evidence-based medicine: (EH-vih-dents-bayst MEH-dih-sin)
    Pronunciation of dictionary term "evidence-based medicine"
    A systematic approach to medicine in which doctors and other health care professionals use the best available scientific evidence from clinical research to help make decisions about the care of individual patients. A physician’s clinical experience and the patient’s values and preferences are also important in the process of using the evidence to make decisions. The use of evidence-based medicine may help plan the best treatment and improve quality of care and patient outcomes. Also called EBM.
  Evista: (ee-VIS-tuh)
    Pronunciation of dictionary term "Evista"
    A drug used to reduce the risk of invasive breast cancer in postmenopausal women who are at high risk of developing the disease or who have osteoporosis and to prevent and treat osteoporosis in postmenopausal women. Evista is also being studied in the treatment of other types of cancer. It blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. Evista may also help keep bone from breaking down. It is a type of selective estrogen receptor modulator (SERM). Also called raloxifene hydrochloride.
    More Information
    - Raloxifene Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/raloxifenehydrochloride)
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  Evomela: (eh-voh-MEH-lah)
    Pronunciation of dictionary term "Evomela"
    A drug that contains the active ingredient melphalan hydrochloride and is given as an infusion to prepare patients with multiple myeloma for a stem cell transplant. It is also being studied in the treatment of other types of cancer. Evomela may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent.
    More Information
    - Melphalan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalan-hydrochloride)
  Evoxac: (EE-voh-ZAK)
    Pronunciation of dictionary term "Evoxac"
    A drug used to treat certain disorders of the salivary gland. It is also being studied as a treatment for dry mouth caused by radiation therapy to the head and neck. It increases the amount of saliva and sweat made by saliva and sweat glands. Evoxac is a type of cholinergic agonist. Also called cevimeline hydrochloride.
  Ewing sarcoma: (YOO-ing sar-KOH-muh)
    Pronunciation of dictionary term "Ewing sarcoma"
    A type of cancer that forms in bone or soft tissue. Also called peripheral primitive neuroectodermal tumor and pPNET.
    More Information
    - Bone Cancer (https://www.cancer.gov/types/bone)
  Ewing sarcoma family of tumors: (YOO-ing sar-KOH-muh FA-mih-lee ... TOO-mers)
    Pronunciation of dictionary term "Ewing sarcoma family of tumors"
    A group of cancers that includes Ewing tumor of bone (ETB or Ewing sarcoma of bone), extraosseous Ewing (EOE) tumors, primitive neuroectodermal tumors (PNET or peripheral neuroepithelioma), and Askin tumors (PNET of the chest wall). These tumors all come from the same type of stem cell. Also called EFTs.
    More Information
    - Bone Cancer (https://www.cancer.gov/types/bone)
  ex vivo: (ex VEE-voh)
    Pronunciation of dictionary term "ex vivo"
    Outside of the living body. Refers to a medical procedure in which an organ, cells, or tissue are taken from a living body for a treatment or procedure, and then returned to the living body.
  Exalgo: (eg-ZAL-goh)
    Pronunciation of dictionary term "Exalgo"
    A drug used to treat moderate to severe pain. It may also be used to treat certain types of cough. Exalgo is made from morphine and binds to opioid receptors in the central nervous system. It is a type of opioid and a type of analgesic agent. Also called Dilaudid, hydromorphone hydrochloride, and Hydrostat IR.
  exatecan mesylate: (EK-suh-TEE-kan MEH-zih-layt)
    Pronunciation of dictionary term "exatecan mesylate"
    An anticancer drug that is a type of topoisomerase inhibitor. Also called DX-8951f.
  excisional biopsy: (ek-SIH-zhuh-nul BY-op-see)
    Pronunciation of dictionary term "excisional biopsy"
    A surgical procedure in which a cut is made through the skin to remove an entire lump or suspicious area so it can be checked under a microscope for signs of disease. A small amount of healthy tissue around the abnormal area may also be removed.
  excisional skin surgery: (ek-SIH-zhuh-nul … SER-juh-ree)
    Pronunciation of dictionary term "excisional skin surgery"
    A surgical procedure used to remove moles, cysts, skin cancer, and other skin growths using local anesthesia. To treat skin cancer, the doctor uses a scalpel to remove the entire tumor and some of the healthy tissue around it.
  excrete: (ek-SKREET)
    Pronunciation of dictionary term "excrete"
    To get rid of waste material from the blood, tissues, or organs by a normal discharge (such as sweat, urine, or stool).
  exemestane: (EK-seh-MEH-stayn)
    Pronunciation of dictionary term "exemestane"
    A drug used to treat postmenopausal women with advanced breast cancer or early-stage breast cancer that is estrogen receptor positive (ER+). It is used in patients whose cancer has already been treated with tamoxifen. It is also being studied in the treatment of other types of cancer. Exemestane lowers the amount of estrogen made by the body. This may stop the growth of cancer cells that need estrogen to grow. Exemestane is a type of aromatase inhibitor. Also called Aromasin.
    More Information
    - Exemestane (https://www.cancer.gov/about-cancer/treatment/drugs/exemestane)
  exenteration: (eg-ZEN-teh-RAY-shun)
    Pronunciation of dictionary term "exenteration"
    Surgery to remove organs within a body cavity.
  existential therapy: (EK-sih-STEN-shul THAYR-uh-pee)
    Pronunciation of dictionary term "existential therapy"
    A type of psychotherapy that helps people think about the problems in their lives in the context of larger issues related to being human. Existential therapy focuses on helping people make healthy choices by taking responsibility for their own decisions, recognizing both their potential and their limitations, developing better ways of communicating, and searching for meaning and purpose in their lives. It may be used to help treat certain conditions, such as anxiety, depression, substance use disorders, and post-traumatic stress disorder.
  exisulind: (ek-sih-SOO-lind)
    Pronunciation of dictionary term "exisulind"
    A drug being studied in the treatment and prevention of cancer. It has been shown to cause apoptosis (cell death) in cells that are malignant (cancer) and in cells that may become cancer. It acts through a group of cellular enzymes called cGMP phosphodiesterases.
  Exjade: (EX-jayd)
    Pronunciation of dictionary term "Exjade"
    A drug used to treat too much iron in the blood caused by blood transfusions. It is being studied in the treatment of myelodysplastic syndromes (a group of diseases in which the bone marrow does not make enough healthy blood cells) and other conditions. Exjade binds to extra iron in the blood. The drug and the iron are passed from the body in urine. It is a type of chelating agent. Also called deferasirox.
  Exkivity: (ek-SKIH-vih-tee)
    Pronunciation of dictionary term "Exkivity"
    A drug used to treat adults with non-small cell lung cancer that has spread and has certain mutations (changes) in the EGFR gene. It is used in patients whose cancer got worse during or after platinum chemotherapy. It is also being studied in the treatment of other conditions. Exkivity blocks certain proteins made by the mutated EGFR gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called mobocertinib succinate.
    More Information
    - Mobocertinib Succinate (https://www.cancer.gov/about-cancer/treatment/drugs/mobocertinib-succinate)
  exocervix: (EK-soh-SER-vix)
    Pronunciation of dictionary term "exocervix"
    The outer part of the cervix that opens into the vagina. The exocervix is lined with squamous cells (thin, flat-looking cells under a microscope). During a pelvic exam, cells may be scraped from the exocervix so they can be checked under a microscope for infection, inflammation, cervical cancer, or changes that may become cervical cancer. Most cervical cancers begin in squamous cells. Also called ectocervix.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  exocrine gland: (EK-soh-krin …)
    Pronunciation of dictionary term "exocrine gland"
    A gland that makes substances such as sweat, tears, saliva, milk, and digestive juices, and releases them through a duct or opening to a body surface. Examples of exocrine glands include sweat glands, lacrimal glands, salivary glands, mammary glands, and digestive glands in the stomach, pancreas, and intestines.
  exocrine pancreas cell: (EK-soh-krin PAN-kree-us sel)
    Pronunciation of dictionary term "exocrine pancreas cell"
    A pancreatic cell that produces enzymes that are secreted into the small intestine. These enzymes help digest food as it passes through the gastrointestinal tract.
  exosome: (EK-soh-some)
    Pronunciation of dictionary term "exosome"
    A tiny sac-like structure that is formed inside a cell and contains some of the cell’s proteins, DNA, and RNA. Exosomes get released into the blood by many types of cells, including cancer cells, and travel through the blood to other parts of the body. They are able to transfer the proteins, DNA, and RNA they contain into other cells. Exosomes may play a role in the spread of cancer and may also keep immune cells from killing cancer cells. They are being studied in the laboratory to help develop new ways of diagnosing and treating cancer, including preventing the spread of cancer cells in the body.
    More Information
    - Shining a Spotlight on Tumor Exosomes (https://www.cancer.gov/research/areas/biology/david-lyden-exosomes-metastasis)
  expanded access: (ek-SPAN-ded AK-ses)
    Pronunciation of dictionary term "expanded access"
    A way to provide an investigational therapy to a patient who is not eligible to receive that therapy in a clinical trial, but who has a serious or life-threatening illness for which other treatments are not available. Expanded access allows patients to receive promising but not yet fully studied or approved cancer therapies when no other treatment option exists. Also called compassionate use.
  expectant management: (ek-SPEK-tunt MA-nij-ment)
    Pronunciation of dictionary term "expectant management"
    Closely watching a patient’s condition but not giving treatment unless symptoms appear or change, or there are changes in test results. Expectant management avoids problems that may be caused by treatments such as radiation or surgery. It is used to find early signs that the condition is getting worse. During expectant management, patients may be given certain exams and tests. It is sometimes used in prostate cancer. Also called deferred therapy.
  experimental: (ek-SPAYR-ih-men-tul)
    Pronunciation of dictionary term "experimental"
    In clinical trials, refers to a drug (including a new drug, dose, combination, or route of administration) or procedure that has undergone basic laboratory testing and received approval from the U.S. Food and Drug Administration (FDA) to be tested in human subjects. A drug or procedure may be approved by the FDA for use in one disease or condition, but be considered experimental in other diseases or conditions. Also called investigational.
  experimental drug: (ek-SPAYR-ih-men-tul ...)
    Pronunciation of dictionary term "experimental drug"
    A substance that has been tested in the laboratory and has been approved by the U.S. Food and Drug Administration (FDA) for testing in people. Clinical trials test how well experimental drugs work and whether they are safe to use. An experimental drug may be approved by the FDA for use in one disease or condition but still be considered investigational in other diseases or conditions. Also called IND, investigational agent, investigational drug, and investigational new drug.
    More Information
    - Access to Experimental Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs/access-experimental)
  experimental group: (ek-SPAYR-ih-MEN-tul groop)
    Pronunciation of dictionary term "experimental group"
    The group in a clinical research study that receives the drug, vaccine, or other intervention being tested. Interventions may also include medical procedures (such as radiation therapy and surgery), medical devices, behavior changes (such as diet and exercise), education programs, and counseling. Also called intervention group and investigational group.
  explanation of benefits: (EK-spluh-NAY-shun … BEH-neh-fits)
    Pronunciation of dictionary term "explanation of benefits"
    A summary of the costs of a medical treatment or other health care service that an insurance company may send to a patient after the patient has received the service. An explanation of benefits usually includes the date the patient received the service, how much the service cost, how much the health insurance plan paid, and how much the patient may need to pay the health care provider. Also called EOB.
  exploratory surgery: (ek-SPLOR-uh-TOR-ee SER-juh-ree)
    Pronunciation of dictionary term "exploratory surgery"
    Surgery to look inside the body to help make a diagnosis.
  extensive-stage small cell lung cancer: (ek-STEN-siv-stayj ... sel lung KAN-ser)
    Pronunciation of dictionary term "extensive-stage small cell lung cancer"
    Cancer has spread outside of the lung in which it began or to other parts of the body.
  external beam radiation therapy: (... RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "external-beam radiation therapy"
    A type of radiation therapy that uses a machine outside the body to send high-energy radiation beams toward the area of the body with cancer. It is used to treat many types of cancer. It may also be used to shrink tumors to treat pain and other problems caused by the tumor, such as trouble breathing or loss of bowel and bladder control. Also called external radiation therapy.
    More Information
    - External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam?redirect=true)
    External-beam radiation therapy of the brain. A machine is used to aim high-energy radiation. The machine can rotate around the patient, delivering radiation from many different angles. A mesh mask helps keep the patient’s head from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
    External-beam radiation therapy of the brain; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation. An inset shows a mesh mask that helps keep the patient's head from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
    External-beam radiation therapy of the head and neck. A machine is used to aim high-energy radiation at the cancer. The machine can rotate around the patient, delivering radiation from many different angles to provide highly conformal treatment. A mesh mask helps keep the patient’s head and neck from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
    External-beam radiation therapy of the head and neck; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation at the cancer. An inset shows a mesh mask that helps keep the patient's head and neck from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
  external radiation therapy: (...RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "external radiation therapy"
    A type of radiation therapy that uses a machine outside the body to send high-energy radiation beams toward the area of the body with cancer. It is used to treat many types of cancer. It may also be used to shrink tumors to treat pain and other problems caused by the tumor, such as trouble breathing or loss of bowel and bladder control. Also called external beam radiation therapy.
    More Information
    - External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam?redirect=true)
    External-beam radiation therapy of the brain. A machine is used to aim high-energy radiation. The machine can rotate around the patient, delivering radiation from many different angles. A mesh mask helps keep the patient’s head from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
    External-beam radiation therapy of the brain; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation. An inset shows a mesh mask that helps keep the patient's head from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
    External-beam radiation therapy of the head and neck. A machine is used to aim high-energy radiation at the cancer. The machine can rotate around the patient, delivering radiation from many different angles to provide highly conformal treatment. A mesh mask helps keep the patient’s head and neck from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
    External-beam radiation therapy of the head and neck; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation at the cancer. An inset shows a mesh mask that helps keep the patient's head and neck from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
  external right atrial catheter: (ek-STER-nul rite AY-tree-ul KA-theh-ter)
    Pronunciation of dictionary term "external right atrial catheter"
    A thin, flexible tube that is inserted into a vein in the neck or below the collar bone and guided (threaded) into the right atrium of the heart. It is used to give intravenous fluids, blood transfusions, and chemotherapy and other drugs, and for taking blood samples. It avoids the need for repeated needle sticks. An external right atrial catheter is a type of central venous access device.
  extracellular matrix: (EK-struh-SEL-yoo-ler MAY-trix)
    Pronunciation of dictionary term "extracellular matrix"
    A large network of proteins and other molecules that surround, support, and give structure to cells and tissues in the body. The extracellular matrix helps cells attach to, and communicate with, nearby cells, and plays an important role in cell growth, cell movement, and other cell functions. The extracellular matrix is also involved in repairing damaged tissue. Abnormal changes in the extracellular matrix may lead to the development of certain diseases, such as cancer. The extracellular matrix of cancer cells can affect how they grow and spread. Also called ECM.
  extracorporeal photopheresis: (EK-struh-kor-POR-ee-ul FOH-toh-feh-REE-sis)
    Pronunciation of dictionary term "extracorporeal photopheresis"
    A procedure in which blood is removed from the body and treated with ultraviolet light and drugs that become active when exposed to light. The blood is then returned to the body. It is being studied in the treatment of some blood and bone marrow diseases and graft-vs-host disease (GVHD). Also called photopheresis.
  extracranial: (EK-struh-KRAY-nee-ul)
    Pronunciation of dictionary term "extracranial"
    Outside of the cranium (bones that surround the brain).
  extracranial germ cell tumor: (EK-struh-KRAY-nee-ul jerm sel TOO-mer)
    Pronunciation of dictionary term "extracranial germ cell tumor"
    A type of tumor that begins in germ cells (cells that form sperm or eggs) that are found in areas of the body other than the brain. These areas include the ovary, testicle, chest, abdomen, and tailbone. Extracranial germ cell tumors may be benign (not cancer) or malignant (cancer). Extracranial germ cell tumors are most common in children and teenagers and can usually be cured.
    More Information
    - Extracranial Germ Cell Tumor (https://www.cancer.gov/types/extracranial-germ-cell)
    Extracranial germ cell tumors form in parts of the body other than the brain. This includes the testicles, ovaries, sacrum (lower part of the spine), coccyx (tailbone), mediastinum (area between the lungs), retroperitoneum (the back wall of the abdomen), and the head and neck.
    Extracranial germ cell tumor; drawing shows parts of the body where extracranial germ cell tumors may form, including the head and neck, mediastinum (the area between the lungs, shown in blue), retroperitoneum (the area behind the abdominal organs, shown in red), sacrum, coccyx, testicles (in males), and ovaries (in females). Also shown are the heart and peritoneum.
  extract: (EK-strakt)
    Pronunciation of dictionary term "extract"
    In medicine, a preparation of a substance obtained from plants, animals, or bacteria and used as a drug or in drugs.
  extragonadal: (EK-struh-goh-NA-dul)
    Pronunciation of dictionary term "extragonadal"
    An area of the body other than the ovaries or testes.
  extragonadal extracranial germ cell tumor: (EK-struh-goh-NA-dul EK-struh-KRAY-nee-ul jerm sel TOO-mer)
    Pronunciation of dictionary term "extragonadal extracranial germ cell tumor"
    A rare type of tumor that begins in germ cells (cells that form sperm or eggs) found in areas of the body other than the testicle, ovary, or brain. Most extragonadal extracranial germ cell tumors form either in the sacrum (the large, triangle-shaped bone in the lower spine that forms part of the pelvis) and tailbone, or in the chest area and back of the abdomen. They may be benign (not cancer) or malignant (cancer) and occur most often in children and young adults.
  extragonadal germ cell tumor: (EK-struh-goh-NA-dul jerm sel TOO-mer)
    Pronunciation of dictionary term "extragonadal germ cell tumor"
    A rare cancer that develops in germ cells that are found in areas of the body other than the ovary or testicle (such as the brain, chest, abdomen, or tailbone). Germ cells are reproductive cells that develop into sperm in males and eggs in females.
    More Information
    - Extragonadal Germ Cell Tumor (https://www.cancer.gov/types/extragonadal-germ-cell)
    Extragonadal germ cell tumors form in parts of the body other than the gonads (testicles or ovaries). This includes the pineal gland in the brain, the mediastinum (area between the lungs), and retroperitoneum (the back wall of the abdomen).
    Extragonadal germ cell tumor; drawing shows parts of the body where extragonadal germ cell tumors may form, including the pineal gland in the brain, the mediastinum (the area between the lungs), and the retroperitoneum (the area behind the abdominal organs). Also shown are the heart and peritoneum.
  extrahepatic: (EK-struh-heh-PA-tik)
    Pronunciation of dictionary term "extrahepatic"
    Located or occurring outside the liver.
  extrahepatic bile duct: (EK-struh-heh-PA-tik bile dukt)
    Pronunciation of dictionary term "extrahepatic bile duct"
    A duct (tube) that is outside the liver and carries bile from the liver and gallbladder to the small intestine. The extrahepatic bile duct is made up of the perihilar region (the area that is closest to the liver and includes the common hepatic duct) and the distal region (the area that is farthest from the liver and includes the common bile duct). The extrahepatic bile duct is part of the biliary system.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  extrahepatic bile duct cancer: (EK-struh-heh-PA-tik bile dukt KAN-ser)
    Pronunciation of dictionary term "extrahepatic bile duct cancer"
    A rare cancer that forms in the bile ducts (tubes) outside the liver. Bile ducts carry bile from the liver and gallbladder to the small intestine. The two types of extrahepatic bile duct cancer are perihilar bile duct cancer (also called a Klatskin tumor) and distal bile duct cancer.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  extramedullary myeloid tumor: (EK-struh-MED-yoo-LAYR-ee MY-eh-loyd TOO-mer)
    Pronunciation of dictionary term "extramedullary myeloid tumor"
    A rare type of cancer that is made up of myeloblasts (a type of immature white blood cell) and forms outside the bone marrow and blood. The tumor cells may look green when viewed under a microscope. Extramedullary myeloid tumors can occur anywhere in the body. They most commonly occur in people with acute myeloid leukemia or a myeloproliferative disorder. Also called chloroma, granulocytic sarcoma, and myeloid sarcoma.
  extranodal: (EK-struh-NOH-dul)
    Pronunciation of dictionary term "extranodal"
    Refers to an area or organ outside of the lymph nodes.
  extraocular: (EK-struh-AH-kyoo-ler)
    Pronunciation of dictionary term "extraocular"
    Located outside the eye.
  extraosseous: (EK-struh-AH-see-us)
    Pronunciation of dictionary term "extraosseous"
    Located or occurring outside of the bone. Also called extraskeletal.
  extraosseous Ewing tumor: (EK-struh-OS-see-us YOO-ing TOO-mer)
    Pronunciation of dictionary term "extraosseous Ewing tumor"
    A rare type of Ewing sarcoma that forms in soft tissue instead of bone. It usually occurs in the chest, pelvis, thigh, foot, or spine. Extraosseous Ewing tumors usually occur in children and young adults. They belong to a group of cancers called Ewing sarcoma family of tumors. Also called extraskeletal Ewing sarcoma and extraskeletal Ewing tumor.
  extraosseous osteosarcoma: (EK-struh-OS-see-us OS-tee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "extraosseous osteosarcoma"
    A rare, fast-growing type of cancer that is made up of bone and cartilage cells, and forms in soft tissue near bones. It usually occurs in the thigh, buttock, shoulder, or trunk (chest and abdomen). It often recurs (comes back) after treatment and spreads to other parts of the body, including the lungs. Extraosseous osteosarcoma usually occurs in middle-aged or older adults, and is rare in children and adolescents. It is a type of soft tissue sarcoma. Also called extraskeletal osteosarcoma.
  extrapleural pneumonectomy: (EK-struh-PLOOR-ul NOO-moh-NEK-toh-mee)
    Pronunciation of dictionary term "extrapleural pneumonectomy"
    Surgery to remove a diseased lung, part of the pericardium (membrane covering the heart), part of the diaphragm (muscle between the lungs and the abdomen), and part of the parietal pleura (membrane lining the chest). This type of surgery is used most often to treat malignant mesothelioma.
  extrarenal (extracranial) rhabdoid tumor: (EK-struh-REE-nul (EK-struh-KRAY-nee-ul) RAB-doyd TOO-mer)
    Pronunciation of dictionary term "extrarenal (extracranial) rhabdoid tumor"
    A rare, fast-growing cancer that forms in the soft tissues of the liver, heart, peritoneum, or other areas of the body outside the kidney and brain. These tumors often have an abnormality of chromosome 22. They usually occur in infants and young children, but they can also occur in older children and adults.
  extraskeletal: (EK-struh-SKEH-leh-tul)
    Pronunciation of dictionary term "extraskeletal"
    Located or occurring outside of the bone. Also called extraosseous.
  extraskeletal Ewing sarcoma: (EK-struh-SKEH-leh-tul YOO-ing sar-KOH-muh)
    Pronunciation of dictionary term "extraskeletal Ewing sarcoma"
    A rare type of Ewing sarcoma that forms in soft tissue instead of bone. It usually occurs in the chest, pelvis, thigh, foot, or spine. Extraskeletal Ewing sarcomas usually occur in children and young adults. They belong to a group of cancers called Ewing sarcoma family of tumors. Also called extraosseous Ewing tumor and extraskeletal Ewing tumor.
  extraskeletal Ewing tumor: (EK-struh-SKEH-leh-tul YOO-ing TOO-mer)
    Pronunciation of dictionary term "extraskeletal Ewing tumor"
    A rare type of Ewing sarcoma that forms in soft tissue instead of bone. It usually occurs in the chest, pelvis, thigh, foot, or spine. Extraskeletal Ewing tumors usually occur in children and young adults. They belong to a group of cancers called Ewing sarcoma family of tumors. Also called extraosseous Ewing tumor and extraskeletal Ewing sarcoma.
  extraskeletal mesenchymal chondrosarcoma: (EK-struh-SKEH-leh-tul meh-ZEN-kih-mul KON-droh-sar-KOH-muh)
    Pronunciation of dictionary term "extraskeletal mesenchymal chondrosarcoma"
    A rare type of cancer that forms in cartilage or other soft tissue but not in bone. It usually occurs in the head and neck. Most extraskeletal mesenchymal chondrosarcomas are fast-growing and may spread to other parts of the body. They may also recur (come back) many years after treatment. Extraskeletal mesenchymal chondrosarcoma usually occurs in young adults. It is a type of soft tissue sarcoma.
  extraskeletal myxoid chondrosarcoma: (EK-struh-SKEH-leh-tul MIK-soyd KON-droh-sar-KOH-muh)
    Pronunciation of dictionary term "extraskeletal myxoid chondrosarcoma"
    A rare, slow-growing type of cancer that forms in soft tissues outside the bone and usually has certain changes in the NR4A3 gene that cause abnormal fusion proteins to be made. Extraskeletal myxoid chondrosarcomas usually occur in the thigh but may also occur in the knee, buttock, or chest and abdomen. They may grow large and spread to nearby tissue or to other parts of the body, especially the lungs. They may also come back many years after treatment. Extraskeletal myxoid chondrosarcomas usually occur in middle-aged or older adults and are rare in children and adolescents. They are a type of soft tissue sarcoma. Also called EMC.
  extraskeletal osteosarcoma: (EK-struh-SKEH-leh-tul OS-tee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "extraskeletal osteosarcoma"
    A rare, fast-growing type of cancer that is made up of bone and cartilage cells, and forms in soft tissue near bones. It usually occurs in the thigh, buttock, shoulder, or trunk (chest and abdomen). It often recurs (comes back) after treatment and spreads to other parts of the body, including the lungs. Extraskeletal osteosarcoma usually occurs in middle-aged or older adults, and is rare in children and adolescents. It is a type of soft tissue sarcoma. Also called extraosseous osteosarcoma.
  extrauterine pregnancy: (EK-struh-YOO-teh-rin PREG-nun-see)
    Pronunciation of dictionary term "extrauterine pregnancy"
    A condition in which a fertilized egg grows outside of the uterus, usually in one of the fallopian tubes. Symptoms include sharp pain on one side of the abdomen and bleeding from the vagina. Also called ectopic pregnancy.
  extravasation: (ek-STRA-vuh-SAY-shun)
    Pronunciation of dictionary term "extravasation"
    The leakage of blood, lymph, or other fluid, such as an anticancer drug, from a blood vessel or tube into the tissue around it. It is also used to describe the movement of cells out of a blood vessel into tissue during inflammation or metastasis (the spread of cancer).
  extravasation injury: (ek-STRA-vuh-SAY-shun IN-jer-ee)
    Pronunciation of dictionary term "extravasation injury"
    Blistering and tissue damage caused by certain drugs when they leak out of a vein into the tissue around it. The damage is sometimes severe and can lead to tissue necrosis (tissue death).
  extremely dense breast tissue: (ek-STREEM-lee dents brest TIH-shoo)
    Pronunciation of dictionary term "extremely dense breast tissue"
    A term used to describe breast tissue that is made up of almost all dense fibrous tissue and glandular tissue. On a mammogram, the dense areas of the breast make it harder to find tumors or other changes. Women who have extremely dense breast tissue have a higher risk of breast cancer than those who have little or no dense breast tissue. Extremely dense breast tissue is one of four categories used to describe a level of breast density seen on a mammogram. About 10% of women have this type of breast tissue.
  extremely low frequency electromagnetic field: (ek-STREEM-lee … FREE-kwen-see ee-LEK-troh-mag-NEH-tik feeld)
    Pronunciation of dictionary term "extremely low frequency electromagnetic field"
    A type of very low-energy radiation that travels in long waves. Although there have been health concerns, it is not known to cause harmful health effects, including cancer. The most common sources of extremely low frequency electromagnetic fields are power lines, electrical wiring, and electrical appliances, such as shavers, hair dryers, and electric blankets. Also called ELF-EMF.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  extremity: (ek-STREH-mih-tee)
    Pronunciation of dictionary term "extremity"
    A limb of the body, such as the arm or leg.
  eye cancer: (i KAN-ser)
    Pronunciation of dictionary term "eye cancer"
    Cancer that forms in tissues of and around the eye. Some of the cancers that may affect the eye include melanoma (a rare cancer that begins in cells that make the pigment melanin in the eye), carcinoma (cancer that begins in tissues that cover structures in the eye), lymphoma (cancer that begins in immune system cells), and retinoblastoma (cancer that begins in the retina and usually occurs in children younger than 5 years).
    More Information
    - Retinoblastoma (https://www.cancer.gov/types/retinoblastoma)
    - Intraocular (Uveal) Melanoma Treatment
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  eye socket: (i SAH-kit)
    Pronunciation of dictionary term "eye socket"
    The space within the skull that contains the eye, including its nerves and muscles. The eye socket also includes the eyelids and the glands that make tears. It is made up of seven bones that surround and protect the eye. Also called orbit.
  EZH2 gene: (… jeen)
    Pronunciation of dictionary term "EZH2 gene"
    A gene that makes a protein that is involved in controlling the activity of certain genes and in cell division. Mutations (changes) in the EZH2 gene may cause the protein made by this gene to become overactive, which may cause cancer cells to grow. EZH2 gene mutations have been found in many types of cancer.
  EZN-2285: A drug used with other drugs to treat acute lymphoblastic leukemia in children and young adults aged 1 month to 21 years. It is also being studied in the treatment of other types of cancer. EZN-2285 is made up of the enzyme L-asparaginase that is linked to a substance called SC-PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. EZN-2285 is a type of protein synthesis inhibitor. Also called Asparlas, calaspargase pegol, and SC-PEG E. coli L-asparaginase.
    More Information
    - Calaspargase Pegol-mknl (https://www.cancer.gov/about-cancer/treatment/drugs/calaspargasepegol-mknl)
  F1CDx test: A laboratory test done on a tumor tissue sample to help match a patient's tumor to a specific drug or therapy. An F1CDx test looks at many different genes in the tissue sample to help identify whether a patient’s tumor has a specific gene mutation (change) or biomarker that is targeted by a particular drug or therapy. This helps determine whether the drug might be an effective treatment for the patient's tumor. An F1CDx test is a type of companion diagnostic test. FoundationOne is a registered trademark of Foundation Medicine, Inc. Also called FoundationOne CDx test.
  F511 cream: (… creem)
    Pronunciation of dictionary term "F511 cream"
    A substance being studied in the prevention of palmar-plantar erythrodysesthesia (pain, swelling, numbness, tingling, or redness of the palms of the hands or soles of the feet) in breast cancer patients treated with anticancer drugs. F511 cream contains a substance that is used in products to control excess sweating under the arms and on the palms of the hands and soles of the feet. It is a type of antiperspirant.
  facial nerve: (FAY-shul nerv)
    Pronunciation of dictionary term "facial nerve"
    A nerve that runs from the brainstem, through openings in the skull, to the face and tongue. The facial nerve sends information between the brain and the muscles used in facial expression (such as smiling and frowning), some muscles in the jaw, and the muscles of a small bone in the middle ear. It also sends information to the front part of the tongue for the sense of taste and to the outer parts of the ear. The facial nerve also stimulates the glands that make tears and saliva. It is a type of cranial nerve. There are two facial nerves, one on each side of the face. Also called seventh cranial nerve.
  falimarev: (fuh-LIM-uh-rev)
    Pronunciation of dictionary term "falimarev"
    A cancer vaccine made with a form of a chicken virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called recombinant fowlpox-CEA-MUC-1-TRICOM vaccine.
  fallopian tube: (fuh-LOH-pee-in...)
    Pronunciation of dictionary term "fallopian tube"
    One of two long, slender tubes that connect the ovaries to the uterus. Eggs pass from the ovaries, through the fallopian tubes, to the uterus. In the female reproductive tract, there is one ovary and one fallopian tube on each side of the uterus.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  fallopian tube cancer: (fuh-LOH-pee-in … KAN-ser)
    Pronunciation of dictionary term "fallopian tube cancer"
    Cancer that forms in the tissue lining the fallopian tube (one of two long, slender tubes that connect the ovaries to the uterus). The cancer sometimes begins at the end of the fallopian tube near the ovary and spreads to the ovary. Fallopian tube cancer is similar to ovarian epithelial cancer and is staged and treated the same way.
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
  false-negative test result: (... NEH-guh-tiv ... reh-ZULT)
    Pronunciation of dictionary term "false-negative test result"
    A test result that indicates that a person does not have a specific disease or condition when the person actually does have the disease or condition.
  false-positive test result: (... PAH-zih-tiv ... reh-ZULT)
    Pronunciation of dictionary term "false-positive test result"
    A test result that indicates that a person has a specific disease or condition when the person actually does not have the disease or condition.
  fam-trastuzumab deruxtecan: (fam-tras-TOO-zoo-mab DEH-rux-TEE-kan)
    Pronunciation of dictionary term "fam-trastuzumab deruxtecan"
    A drug used to treat adults with certain types of HER2-positive or HER2-low breast cancer, HER2-positive stomach cancer, gastroesophageal junction cancer, or other solid tumor, or non-small cell lung cancer that has a certain mutation in the HER2 gene. It is also being studied in the treatment of other types of cancer. Fam-trastuzumab deruxtecan contains a monoclonal antibody called trastuzumab that binds to a protein called HER2, which is found on some cancer cells. It also contains an anticancer drug called deruxtecan, which may help kill cancer cells. Fam-trastuzumab deruxtecan is a type of antibody-drug conjugate. Also called Enhertu and trastuzumab deruxtecan.
    More Information
    - Fam-Trastuzumab Deruxtecan-nxki (https://www.cancer.gov/about-cancer/treatment/drugs/famtrastuzumabderuxtecan-nxki)
  familial adenomatous polyposis: (fuh-MIH-lee-ul A-deh-NOH-muh-tus PAH-lee-POH-sis)
    Pronunciation of dictionary term "familial adenomatous polyposis"
    An inherited disorder in which many polyps (usually hundreds to thousands) form on the inner walls of the colon and rectum. Polyps are abnormal growths that may become cancer if they are not removed. People with familial adenomatous polyposis have a very high risk of developing colorectal cancer at an early age and are also at risk of developing cancers of the stomach, small intestine, pancreas, bile duct, liver, adrenal gland, thyroid, and brain. They may also have dental and eye problems and benign (not cancer) tumors in the stomach, small intestine, bone, soft tissue, skin, and adrenal glands. Familial adenomatous polyposis is caused by mutations (changes) in a gene called APC that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called classic familial adenomatous polyposis, classic familial polyposis, classic FAP, and FAP.
    More Information
    - Familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6408/familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  familial atypical multiple mole melanoma syndrome: (fuh-MIH-lee-ul ay-TIH-pih-kul MUL-tih-pul ... MEH-luh-NOH-muh SIN-drome)
    Pronunciation of dictionary term "familial atypical multiple mole melanoma syndrome"
    An inherited condition marked by the following: (1) one or more first- or second-degree relatives (parent, sibling, child, grandparent, grandchild, aunt, or uncle) with malignant melanoma; (2) many moles, some of which are atypical (asymmetrical, raised, and/or different shades of tan, brown, black, or red) and often of different sizes; and (3) moles that have specific features when examined under a microscope. Familial atypical multiple mole melanoma syndrome increases the risk of melanoma and may increase the risk of pancreatic cancer. Also called FAMMM syndrome.
    More Information
    - Familial atypical multiple mole melanoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9281/fammm-syndrome)
  familial cancer: (fuh-MIH-lee-ul KAN-ser)
    Pronunciation of dictionary term "familial cancer"
    Cancer that occurs in families more often than would be expected by chance. These cancers often occur at an early age, and may indicate the presence of a gene mutation that increases the risk of cancer. They may also be a sign of shared environmental or lifestyle factors.
  familial diffuse gastric cancer: (fuh-MIH-lee-ul dih-FYOOS GAS-trik KAN-ser)
    Pronunciation of dictionary term "familial diffuse gastric cancer"
    A rare, inherited disorder that increases the risk of developing a type of stomach cancer called diffuse gastric cancer. This cancer grows in the lining of the stomach, which causes the lining to become thick and hard. The cancer is also likely to spread to other parts of the body, such as the liver or bone. Women with familial diffuse gastric cancer also have an increased risk of developing a type of breast cancer that begins in the lobules (milk glands) of the breast. Familial diffuse gastric cancer is usually caused by mutations (changes) in the CDH1 gene that are inherited in an autosomal dominant manner. It is a type hereditary cancer syndrome. Also called HDGC and hereditary diffuse gastric cancer.
    More Information
    - Hereditary diffuse gastric cancer (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10900/hereditary-diffuse-gastric-cancer)
    - Hereditary diffuse gastric cancer (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-diffuse-gastric-cancer/)
  familial dysplastic nevi: (fuh-MIH-lee-ul dis-PLAS-tik NEE-vye)
    Pronunciation of dictionary term "familial dysplastic nevi"
    A condition that runs in certain families in which at least two members have dysplastic nevi (atypical moles) and have a tendency to develop melanoma.
  familial intestinal gastric cancer: (fuh-MIH-lee-ul in-TES-tih-nul GAS-trik KAN-ser)
    Pronunciation of dictionary term "familial intestinal gastric cancer"
    A rare, inherited disorder that increases the risk of developing a type of stomach cancer called intestinal gastric adenocarcinoma. This cancer begins in the mucus-producing cells in the innermost lining of the stomach and tends to grow and spread more slowly than other types of stomach cancer. Familial intestinal gastric cancer runs in families, but the gene involved in this disorder is not known. Also called FIGC.
  familial isolated hyperparathyroidism: (fuh-MIH-lee-ul I-soh-LAY-ted HY-per-PAYR-uh-THY-roy-dih-zum)
    Pronunciation of dictionary term "familial isolated hyperparathyroidism"
    A rare inherited condition in which one or more tumors form in the parathyroid glands (four pea-sized organs found on the thyroid) and cause them to make too much parathyroid hormone. The increased parathyroid hormone causes a loss of calcium from the bones and too much calcium in the blood. Also called FIHP.
    More Information
    - Familial isolated hyperparathyroidism (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2837/familial-isolated-hyperparathyroidism)
    - Familial isolated hyperparathyroidism (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-isolated-hyperparathyroidism/)
  familial medullary thyroid cancer: (fuh-MIH-lee-ul MED-yoo-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "familial medullary thyroid cancer"
    An inherited form of medullary thyroid cancer (cancer that forms in the cells of the thyroid that make the hormone calcitonin).
  family cancer syndrome: (FA-mih-lee KAN-ser SIN-drome)
    Pronunciation of dictionary term "family cancer syndrome"
    A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Family cancer syndromes are caused by mutations (changes) in certain genes passed from parents to children. In a family cancer syndrome, certain patterns of cancer may be seen within families. These patterns include having several close family members (such as a mother, daughter, and sister) with the same type of cancer, developing cancer at an early age, or having two or more types of cancer develop in the same person. Examples of family cancer syndromes are hereditary breast and ovarian cancer syndrome, Li-Fraumeni syndrome, Cowden syndrome, and Lynch syndrome. Also called hereditary cancer syndrome and inherited cancer syndrome.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  family history: (FA-mih-lee HIH-stuh-ree)
    Pronunciation of dictionary term "family history"
    A record of the relationships among family members along with their medical histories. This includes current and past illnesses. A family history may show a pattern of certain diseases in a family. Also called family medical history.
    More Information
    - Family History (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Family-History)
  family medical history: (FA-mih-lee MEH-dih-kul HIH-stuh-ree)
    Pronunciation of dictionary term "family medical history"
    A record of the relationships among family members along with their medical histories. This includes current and past illnesses. A family medical history may show a pattern of certain diseases in a family. Also called family history.
    More Information
    - Family History (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Family-History)
  family therapy: (FA-mih-lee THAYR-uh-pee)
    Pronunciation of dictionary term "family therapy"
    A type of therapy in which the whole family talks with a professional counselor to solve family problems.
  FAMMM syndrome: (… SIN-drome)
    Pronunciation of dictionary term "FAMMM syndrome"
    An inherited condition marked by the following: (1) one or more first- or second-degree relatives (parent, sibling, child, grandparent, grandchild, aunt, or uncle) with malignant melanoma; (2) many moles, some of which are atypical (asymmetrical, raised, and/or different shades of tan, brown, black, or red) and often of different sizes; and (3) moles that have specific features when examined under a microscope. FAMMM syndrome increases the risk of melanoma and may increase the risk of pancreatic cancer. Also called familial atypical multiple mole melanoma syndrome.
    More Information
    - Familial atypical multiple mole melanoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9281/fammm-syndrome)
  Fanconi anemia: (fan-KOH-nee uh-NEE-mee-uh)
    Pronunciation of dictionary term "Fanconi anemia"
    A rare inherited disorder in which the bone marrow does not make enough blood cells, including red blood cells, white blood cells, and platelets. It is usually diagnosed before age 15 years. Signs and symptoms include frequent infections, a tendency to bleed easily, and extreme tiredness. People with Fanconi anemia may also have brown spots on the skin, short height, malformed thumbs or forearms, small head or eyes, hearing loss, and abnormalities of the kidneys, gastrointestinal tract, heart, genitals, brain, and spinal cord. They also have an increased risk of developing certain types of cancer, including leukemia and cancers of the skin, head, neck, gastrointestinal system, and genitals. Fanconi anemia is caused by mutations (changes) in certain genes involved in DNA repair.
    More Information
    - Fanconi anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6425/fanconi-anemia)
    - Fanconi anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/fanconi-anemia/)
  Fanconi syndrome: (fan-KOH-nee SIN-drome)
    Pronunciation of dictionary term "Fanconi syndrome"
    A group of kidney disorders that cause protein, sugar, minerals, and other nutrients to be lost in the urine. Symptoms include weakness, bone pain, and passing a greater than normal amount of urine. One form of Fanconi syndrome is inherited and is usually found in infants. Fanconi syndrome may also be caused by other diseases, a lack of vitamin D, or exposure to heavy metals or chemicals, including certain anticancer drugs.
  FAP: An inherited disorder in which many polyps (usually hundreds to thousands) form on the inner walls of the colon and rectum. Polyps are abnormal growths that may become cancer if they are not removed. People with FAP have a very high risk of developing colorectal cancer at an early age and are also at risk of developing cancers of the stomach, small intestine, pancreas, bile duct, liver, adrenal gland, thyroid, and brain. They may also have dental and eye problems and benign (not cancer) tumors in the stomach, small intestine, bone, soft tissue, skin, and adrenal glands. FAP is caused by mutations (changes) in a gene called APC that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called classic familial adenomatous polyposis, classic familial polyposis, classic FAP, and familial adenomatous polyposis.
    More Information
    - Familial adenomatous polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6408/familial-adenomatous-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
  Fareston: (FAYR-es-ton)
    Pronunciation of dictionary term "Fareston"
    A drug used to treat postmenopausal women with breast cancer that has spread to other parts of the body. It is used in patients whose cancer is estrogen receptor positive (ER+) or when it is not known if the cancer is ER+ or estrogen receptor negative (ER-). Fareston blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. It is a type of selective estrogen receptor modulator (SERM). Also called toremifene citrate.
    More Information
    - Toremifene Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/toremifene)
  Farydak: (FAYR-ah-dak)
    Pronunciation of dictionary term "Farydak"
    A drug used with bortezomib and dexamethasone to treat multiple myeloma. It is used in patients whose cancer has already been treated with at least two other therapies, including bortezomib and an immunomodulating agent. It is also being studied in the treatment of other types of cancer. Farydak blocks certain enzymes, which may help keep cancer cells from growing and dividing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Farydak is a type of histone deacetylase inhibitor and a type of antiangiogenesis agent. Also called LBH589 and panobinostat lactate.
    More Information
    - Panobinostat Lactate (https://www.cancer.gov/about-cancer/treatment/drugs/panobinostat)
  Faslodex: (FAZ-loh-dex)
    Pronunciation of dictionary term "Faslodex"
    A drug used to treat certain types of breast cancer. It is used alone or with ribociclib succinate in postmenopausal women who have not been treated with hormone therapy or whose disease got worse after treatment with hormone therapy. It is also used with palbociclib or abemaciclib in women whose disease got worse after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. Faslodex binds to proteins called estrogen receptors, which are found in some breast cancer cells. These proteins may cause cancer cells to grow. Faslodex blocks these proteins and may keep cancer cells from growing. It is a type of antiestrogen. Also called fulvestrant and ICI 182780.
    More Information
    - Fulvestrant (https://www.cancer.gov/about-cancer/treatment/drugs/fulvestrant)
  Fast Track: (fast-TRAK)
    Pronunciation of dictionary term "Fast Track"
    A U.S. Food and Drug Administration (FDA) process designed to speed up the development and review of new drugs that treat serious or life-threatening conditions and fill an unmet need. Fast Track is one way that patients can receive promising new drugs when other treatment options may not exist.
    More Information
    - Fast Track (https://www.fda.gov/patients/fast-track-breakthrough-therapy-accelerated-approval-priority-review/fast-track)
  fast-neutron beam radiation: (fast-NOO-tron beem RAY-dee-AY-shun)
    Pronunciation of dictionary term "fast-neutron beam radiation"
    A type of radiation therapy that uses tiny particles called neutrons made by a machine called a cyclotron.
  fat necrosis: (… neh-KROH-sis)
    Pronunciation of dictionary term "fat necrosis"
    A benign condition in which fat tissue in the breast or other organs is damaged by injury, surgery, or radiation therapy. The fat tissue in the breast may be replaced by a cyst or by scar tissue, which may feel like a round, firm lump. The skin around the lump may look red, bruised or dimpled.
  fat-soluble vitamin: (… SOL-yoo-bul VY-tuh-min)
    Pronunciation of dictionary term "fat-soluble vitamin"
    A vitamin that can dissolve in fats and oils. Vitamins are nutrients that the body needs in small amounts to stay healthy and work the way it should. Fat-soluble vitamins are absorbed along with fats in the diet and are stored in the body’s fatty tissue and in the liver. They are found in many plant and animal foods and in dietary supplements. Vitamins A, D, E, and K are fat-soluble.
  fatigue: (fuh-TEEG)
    Pronunciation of dictionary term "fatigue"
    An extreme sense of tiredness and lack of energy that can interfere with a person's usual daily activities. A person with fatigue may feel weak, worn out, heavy, slow, or run down. They may also have trouble speaking or concentrating, short-term memory loss, and mood or emotional changes. There are many causes of fatigue, including anemia, poor nutrition, pain, anxiety, depression, sleep or thyroid disorders, and taking certain medicines. Fatigue may also be caused by cancer or cancer treatment. Certain types of fatigue, including cancer-related fatigue, may not be completely relieved by sleep and may last for a long time after treatment ends.
    More Information
    - Cancer Fatigue (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue)
  fatty acid: (FA-tee A-sid)
    Pronunciation of dictionary term "fatty acid"
    A major component of fats that is used by the body for energy and tissue development.
  fatty breast tissue: (FA-tee brest TIH-shoo)
    Pronunciation of dictionary term "fatty breast tissue"
    A term used to describe breast tissue that is made up of almost all fatty tissue. Fatty breast tissue does not look dense on a mammogram, which may make it easier to find tumors or other changes in the breast. Fatty breast tissue is more common in older women than in younger women. Fatty breast tissue is one of four categories used to describe a level of breast density seen on a mammogram.
  fatty liver disease: (FA-tee LIH-ver dih-ZEEZ)
    Pronunciation of dictionary term "fatty liver disease"
    A common condition in which fat builds up in the liver. In most people, fatty liver disease does not cause any symptoms or serious liver problems. However, in some cases, it can cause liver inflammation and damage to the cells in the liver. The two main types of fatty liver disease are alcoholic fatty liver disease (AFLD) and nonalcoholic fatty liver disease (NAFLD). AFLD occurs in people who drink large amounts of alcohol. NAFLD occurs in people who drink little or no alcohol. It usually affects middle-aged and older adults but is becoming more common in children and teens. It is especially common in people who are overweight or who have obesity, diabetes, or high levels of cholesterol and triglycerides (a type of fat) in the blood. A severe form of NAFLD called nonalcoholic steatohepatitis can cause cirrhosis (scarring of the liver) that may lead to liver failure or liver cancer.
    More Information
    - Fatty Liver Disease (MedlinePlus) (https://medlineplus.gov/fattyliverdisease.html)
  FAU: A substance being studied in the treatment of advanced solid tumors and lymphomas. It blocks the growth of cells and may cause cancer cells to die. It is a type of uracil analog. Also called 1-(2’-deoxy-2’-fluoro-ß-D-arabinofuranosyl) uracil.
  fazarabine: (fuh-ZAR-uh-been)
    Pronunciation of dictionary term "fazarabine"
    An anticancer drug that is a type of antimetabolite.
  FDA: An agency in the U.S. federal government whose mission is to protect public health by making sure that food, cosmetics, and nutritional supplements are safe to use and truthfully labeled. The FDA also makes sure that drugs, medical devices, and equipment are safe and effective, and that blood for transfusions and transplant tissue are safe. Also called Food and Drug Administration.
    More Information
    - U.S. Food and Drug Administration (https://www.fda.gov/)
  FdCyd: A substance being studied in the treatment of some types of cancer. It may prevent the growth of tumors by stopping cancer cells from dividing and by killing them. It is a type of antimetabolite. Also called 5-fluoro-2-deoxycytidine.
  FDR: A way of describing how family members are related to each other when there are no other family members in the blood line between them. Examples of an FDR are a parent, sibling, or child. Also called first-degree relative.
    More Information
    - First Degree Relative (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/First-Degree-Relative)
  feasibility study: (FEE-sih-BIH-lih-tee STUH-dee)
    Pronunciation of dictionary term "feasibility study"
    A pilot study that is designed to explore whether a larger clinical trial can be effectively conducted.
  febrile neutropenia: (FEH-brile noo-troh-PEE-nee-uh)
    Pronunciation of dictionary term "febrile neutropenia"
    A condition marked by fever and a lower-than-normal number of neutrophils in the blood. A neutrophil is a type of white blood cell that helps fight infection. Having too few neutrophils increases the risk of infection.
  FEC: An abbreviation for a chemotherapy combination used with other types of therapy to treat breast cancer, including breast cancer that has spread or come back. It includes the drugs fluorouracil, epirubicin hydrochloride, and cyclophosphamide. Also called FEC regimen.
    More Information
    - FEC (https://www.cancer.gov/about-cancer/treatment/drugs/FEC)
  FEC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "FEC regimen"
    An abbreviation for a chemotherapy combination used with other types of therapy to treat breast cancer, including breast cancer that has spread or come back. It includes the drugs fluorouracil, epirubicin hydrochloride, and cyclophosphamide. Also called FEC.
    More Information
    - FEC (https://www.cancer.gov/about-cancer/treatment/drugs/FEC)
  fecal immunochemical test: (FEE-kul IH-myoo-noh-KEH-mih-kul …)
    Pronunciation of dictionary term "fecal immunochemical test"
    A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card for testing. The test uses an antibody that binds to a blood protein called hemoglobin to detect any blood. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called FIT, iFOBT, immunoassay fecal occult blood test, immunochemical fecal occult blood test, and immunologic fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
  fecal impaction: (FEE-kul im-PAK-shun)
    Pronunciation of dictionary term "fecal impaction"
    A mass of dry, hard stool that cannot pass out of the colon or rectum. Fecal impaction may be caused by using laxatives too often, using certain types of pain medicines, little or no physical activity over a long period, diet changes, or constipation that is not treated. Signs and symptoms may include being unable to have a bowel movement, pain in the abdomen or back, problems urinating, and nausea and vomiting. Fecal impaction may also cause problems with circulation, the heart, or breathing.
    More Information
    - Constipation and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation)
    Fecal impaction is a serious condition in which a mass of dry, hard stool blocks the colon or rectum. It can be life threatening and requires immediate medical attention.
    Fecal impaction; drawing showing a mass of dark brown stool in the last part of the colon and in the rectum. The stomach, small intestine, and anus are also shown.
  fecal incontinence: (FEE-kul in-KON-tih-nents)
    Pronunciation of dictionary term "fecal incontinence"
    Inability to hold stool in the rectum.
  fecal occult blood test: (FEE-kul uh-KULT...)
    Pronunciation of dictionary term "fecal occult blood test"
    A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card and sent to a doctor or laboratory for testing. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Guaiac fecal occult blood test and immunochemical fecal occult blood test are two types of fecal occult blood tests. Guaiac fecal occult blood test uses a chemical substance called guaiac to check for blood in the stool. Immunochemical fecal occult blood test uses an antibody to check for blood in the stool. Also called FOBT.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
    A guaiac fecal occult blood test (FOBT) checks for occult (hidden) blood in the stool. Small samples of stool are placed on a special card and returned to a doctor or laboratory for testing.
    Guaiac fecal occult blood test (FOBT) kit; shows card, applicator, and return envelope.
  feces: (FEE-seez)
    Pronunciation of dictionary term "feces"
    The material in a bowel movement. Feces is made up of undigested food, bacteria, mucus, and cells from the lining of the intestines. Also called stool.
  fedratinib hydrochloride: (feh-DRAH-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "fedratinib hydrochloride"
    A drug used to treat adults with intermediate-risk or high-risk myelofibrosis (MF), including primary MF, post-polycythemia vera MF, and post-essential thrombocythemia MF. It is also being studied in the treatment of other conditions. Fedratinib hydrochloride blocks JAK2 and other proteins, which may help keep abnormal blood cells or cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Inrebic.
    More Information
    - Fedratinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/fedratinibhydrochloride)
  Femara: (FEH-muh-ruh)
    Pronunciation of dictionary term "Femara"
    A drug used to treat certain types of breast cancer in postmenopausal women. It is also being studied in the treatment of other types of cancer. Femara lowers the amount of estrogen made by the body. This may stop the growth of cancer cells that need estrogen to grow. Femara is a type of aromatase inhibitor. Also called letrozole.
    More Information
    - Letrozole (https://www.cancer.gov/about-cancer/treatment/drugs/letrozole)
  fenofibrate: (FEH-noh-FY-brayt)
    Pronunciation of dictionary term "fenofibrate"
    A drug used to treat high levels of cholesterol and triglycerides in the blood. Fenofibrate is being studied in the treatment of advanced cancers in young patients and in the treatment of other conditions. It is a type of antilipidemic agent. Also called Lofibra and TriCor.
  fenretinide: (fen-REH-tih-nide)
    Pronunciation of dictionary term "fenretinide"
    A substance being studied in the treatment and prevention of some types of cancer. Fenretinide may cause ceramide (a wax-like substance) to build up in tumor cells and kill them. It is a type of retinoid, which are substances related to vitamin A.
  fenretinide LXS: (fen-REH-tih-nide…)
    Pronunciation of dictionary term "fenretinide LXS"
    A powdered form of fenretinide that is being studied in the treatment of neuroblastoma. It may be used by the body more easily than the pill form. Fenretinide may cause ceramide (a wax-like substance) to build up in tumor cells and kill them. It is a type of retinoid, which are substances related to vitamin A. Also called fenretinide Lym-X-Sorb.
  fenretinide Lym-X-Sorb: (fen-REH-tih-nide…)
    Pronunciation of dictionary term "fenretinide Lym-X-Sorb"
    A powdered form of fenretinide that is being studied in the treatment of neuroblastoma. It may be used by the body more easily than the pill form. Fenretinide may cause ceramide (a wax-like substance) to build up in tumor cells and kill them. It is a type of retinoid, which are substances related to vitamin A. Also called fenretinide LXS.
  fentanyl citrate: (FEN-tuh-nil SIH-trayt)
    Pronunciation of dictionary term "fentanyl citrate"
    A drug used to treat severe pain in people with chronic conditions, such as cancer, who have not gotten better after treatment with other opioids. It is also used to treat pain after surgery. Fentanyl citrate works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and alters how the body responds to pain. It is a type of synthetic opioid agonist that acts as an analgesic (pain reliever). Also called Actiq.
    More Information
    - Cancer Pain
  fentanyl sublingual spray: (FEN-tuh-nil sub-LING-wul …)
    Pronunciation of dictionary term "fentanyl sublingual spray"
    A form of the drug fentanyl that is sprayed under the tongue and then absorbed into the blood. It is being studied in the treatment of breakthrough pain (pain that occurs even when pain-control medication is already being used) in cancer patients. Fentanyl is a type of opioid analgesic.
  Ferguson-Smith syndrome: (FER-guh-son … SIN-drome)
    Pronunciation of dictionary term "Ferguson-Smith syndrome"
    A rare, inherited disorder in which many fast-growing tumors that look like squamous cell skin cancer form on the nose, face, ears, arms, and legs. The tumors usually go away on their own, but often leave deep, pitted scars in the skin. The tumors on the arms and legs are often larger and leave flat scars. Ferguson-Smith syndrome is caused by mutations (changes) in the TGFBR1 gene. Also called MSSE and multiple self-healing squamous epithelioma.
  ferritin: (FAYR-ih-tin)
    Pronunciation of dictionary term "ferritin"
    A protein that binds to iron and stores it for use by the body. Ferritin is found in cells in the liver, spleen, bone marrow, and other tissues.
  Ferrlecit: (FAYR-leh-sit)
    Pronunciation of dictionary term "Ferrlecit"
    A form of the mineral iron that is used to treat anemia caused by low amounts of iron in the blood. Anemia is a condition in which the number of red blood cells is below normal. Ferrlecit is a type of hematinic and a dietary supplement. Also called sodium ferric gluconate.
  ferrous sulfate: (FAYR-us SUL-fayt)
    Pronunciation of dictionary term "ferrous sulfate"
    A form of the mineral iron that is used to treat anemia caused by low amounts of iron in the blood. Anemia is a condition in which the number of red blood cells is below normal. Ferrous sulfate is a type of hematinic and a type of dietary supplement.
  fertile: (FER-til)
    Pronunciation of dictionary term "fertile"
    Able to produce children.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  fertility: (fer-TIH-lih-tee)
    Pronunciation of dictionary term "fertility"
    The ability to produce children.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  fertility preservation: (fer-TIH-lih-tee PREH-zer-VAY-shun)
    Pronunciation of dictionary term "fertility preservation"
    A type of procedure used to help keep a person’s ability to have children. A fertility preservation procedure is done before a medical treatment that may cause infertility, such as radiation therapy or chemotherapy. Examples of fertility preservation procedures include sperm banking, egg freezing, in vitro fertilization with embryo freezing, and certain types of surgery for cervical and ovarian cancer.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  fertility specialist: (fer-TIH-lih-tee SPEH-shuh-list)
    Pronunciation of dictionary term "fertility specialist"
    A doctor who has special training in helping people who have trouble conceiving or carrying a pregnancy to term. Fertility specialists may use surgery, medications, or procedures, such as in vitro fertilization, to treat fertility-related conditions. They may also use procedures, such as sperm banking and egg freezing, to help preserve a person’s ability to have children after receiving certain treatments for cancer. Some fertility specialists also perform procedures to help prevent pregnancy, such as tubal ligation or vasectomy.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  ferumoxtran-10: (fayr-yoo-MOX-tran…)
    Pronunciation of dictionary term "ferumoxtran-10"
    A substance being studied as a way of improving magnetic resonance imaging (MRI) in diagnosing cancer and finding lymph nodes to which cancer has spread. Ferumoxtran-10 is made of nanoparticles (ultrasmall pieces) of iron oxide coated with dextran (a type of sugar). It is injected into the blood of the patient and the particles collect in lymph nodes, liver, spleen, or brain tissue where they can be seen using MRI. Ferumoxtran-10 later breaks down and passes from the body in urine.
  ferumoxytol: (fayr-yoo-MOK-sih-tol)
    Pronunciation of dictionary term "ferumoxytol"
    A nanoparticle form of iron made in the laboratory that is being studied for use in iron replacement therapy, and as a contrast agent for magnetic resonance imaging. Contrast agents are substances that are injected into the body and taken up by certain tissues, making the tissues easier to see in imaging scans.
  fetal: (FEE-tul)
    Pronunciation of dictionary term "fetal"
    Having to do with a fetus. A fetus is an unborn offspring that develops and grows inside the uterus (womb) of humans and other mammals. In humans, the fetal period begins at 9 weeks after fertilization of an egg by a sperm and ends at birth.
  fetus: (FEE-tus)
    Pronunciation of dictionary term "fetus"
    An unborn offspring that develops and grows inside the uterus (womb) of humans and other mammals. In humans, the fetal period begins at 9 weeks after fertilization of an egg by a sperm and ends at the time of birth.
  fever: (FEE-ver)
    Pronunciation of dictionary term "fever"
    An increase in body temperature above normal (98.6 degrees F), usually caused by disease.
    More Information
    - Hot Flashes and Night Sweats
  fexofenadine: (FEK-soh-FEH-nuh-deen)
    Pronunciation of dictionary term "fexofenadine"
    A drug used to treat certain allergy symptoms. It blocks a chemical released during an allergic response that causes itching, sneezing, runny nose, wheezing, and watery eyes. It is a type of antihistamine. Also called Allegra.
  FGFR1 gene: (… jeen)
    Pronunciation of dictionary term "FGFR1 gene"
    A gene that makes a protein involved in cell division, cell growth and maturation, formation of new blood vessels, wound healing, and the growth and development of many parts of the body. Mutations (changes) in the FGFR1 gene may cause the FGFR1 protein to become overactive, which may cause cells to grow and divide too quickly or in an uncontrolled way. FGFR1 gene mutations have been found in certain genetic conditions and in some types of cancer. Also called fibroblast growth factor receptor 1 gene.
  FGFR2 gene: (… jeen)
    Pronunciation of dictionary term "FGFR2 gene"
    A gene that makes a protein that is involved in cell division, cell maturation, formation of new blood vessels, wound healing, and bone growth and development. A mutation (change) in the FGFR2 gene may cause the FGFR2 protein to become overactive in certain bone disorders, genetic conditions, and cancers. Also called fibroblast growth factor receptor 2 gene.
  FGFR3 gene: (… jeen)
    Pronunciation of dictionary term "FGFR3 gene"
    A gene that makes a protein that is involved in cell division, cell maturation, formation of new blood vessels, wound healing, and bone growth, development, and maintenance. A mutation (change) in the FGFR3 gene may cause the FGFR3 protein to become overactive in certain bone disorders, genetic conditions, and cancers. Also called fibroblast growth factor receptor 3 gene.
  FH gene: (… jeen)
    Pronunciation of dictionary term "FH gene"
    A gene that makes an enzyme that helps cells in the body use oxygen and make energy. Mutated (changed) forms of the FH gene may cause cells to lose the ability to use oxygen. This may increase the growth of some cells, including abnormal cells and cancer cells. The mutated FH gene has been found in an inherited condition called hereditary leiomyomatosis and renal cell cancer (HLRCC). Patients with HLRCC have an increased risk of kidney cancer and tumors in the skin and uterus. Also called fumarate hydratase gene.
    More Information
    - Hereditary Kidney Cancer Syndromes
  fiber: (FY-ber)
    Pronunciation of dictionary term "fiber"
    In food, fiber is a type of carbohydrate found in plant foods that the body cannot digest. Fiber comes in two forms: soluble fiber and insoluble fiber. Soluble fiber dissolves in water and can help lower cholesterol and blood sugar levels. Soluble fiber is found in apples, bananas, oats, peas, black beans, lima beans, Brussels sprouts, and avocados. Insoluble fiber does not dissolve in water and helps move food through the digestive system, relieving or preventing constipation. Insoluble fiber is found in whole wheat flour, bran, nuts, seeds, and the skins of many fruits and vegetables. Eating foods rich in fiber may help with weight loss and reduce the risk of heart disease and some types of cancer. In body tissues, fiber refers to long thread-like cells, such as muscle fibers or nerve fibers.
    More Information
    - Fiber: The Carb That Helps You Manage Diabetes (Centers for Disease Control and Prevention) (https://www.cdc.gov/diabetes/healthy-eating/fiber-helps-diabetes.html)
    - Dietary Fiber (MedlinePlus) (https://medlineplus.gov/dietaryfiber.html)
  fiberoptic: (FY-ber-OP-tik)
    Pronunciation of dictionary term "fiberoptic"
    Describes the use of a coated, thin, clear, glass or plastic fiber that can carry light and send information, including images. In medicine, flexible fiberoptic instruments are used to look inside the body. Fiberoptics are also used to deliver laser light to tumors injected with a type of drug that kills cancer cells when it is exposed to laser light.
  fibrin: (FY-brin)
    Pronunciation of dictionary term "fibrin"
    A protein involved in forming blood clots in the body. It is made from the protein fibrinogen and helps stop bleeding and heal wounds. Sometimes fibrin-like substances may be found in higher than normal amounts in the blood and urine of patients with some types of cancer or other conditions. Measuring the amount of these substances may help to check how well cancer treatment is working or if the cancer has gotten worse. Fibrin is a type of tumor marker.
  fibrin sealant: (FY-brin SEE-lent)
    Pronunciation of dictionary term "fibrin sealant"
    A substance used during surgery to help heal wounds. It contains proteins found in human blood that cause blood to clot. When fibrin sealant is placed on a wound, a clot forms. Fibrin sealant is being studied as a way to improve healing after lymph node removal in patients with cancer. It is a type of surgical glue.
  fibrinogen: (fy-BRIH-noh-jen)
    Pronunciation of dictionary term "fibrinogen"
    A protein involved in forming blood clots in the body. It is made in the liver and forms fibrin. Fibrin is the main protein in a blood clot that helps stop bleeding and heal wounds. Sometimes fibrin-like substances may be found in higher than normal amounts in the blood and urine of patients with some types of cancer or other conditions. Measuring the amount of these substances may help to check how well cancer treatment is working or if the cancer has gotten worse. Fibrinogen is a type of tumor marker.
  fibroadenoma: (FY-broh-a-deh-NOH-muh)
    Pronunciation of dictionary term "fibroadenoma"
    A benign (not cancer) tumor that most often forms in the breast and is made up of fibrous (connective) tissue and glandular tissue. A fibroadenoma is usually painless. It often feels like a hard, round lump with a smooth, well-defined border that moves easily under the skin of the breast. Fibroadenomas may go away on their own or may need to be removed. They often get smaller after menopause. Fibroadenomas are the most common type of benign breast tumor. They can occur at any age but are more common in younger women. Most fibroadenomas do not increase the risk of breast cancer.
  fibroblast: (FY-broh-blast)
    Pronunciation of dictionary term "fibroblast"
    A connective tissue cell that makes and secretes collagen proteins.
  fibroblast growth factor receptor 1 gene: (FY-broh-blast grothe FAK-ter reh-SEP-ter … jeen)
    Pronunciation of dictionary term "fibroblast growth factor receptor 1 gene"
    A gene that makes a protein involved in cell division, cell growth and maturation, formation of new blood vessels, wound healing, and the growth and development of many parts of the body. Mutations (changes) in the fibroblast growth factor receptor 1 gene may cause the FGFR1 protein to become overactive, which may cause cells to grow and divide too quickly or in an uncontrolled way. Fibroblast growth factor receptor 1 gene mutations have been found in certain genetic conditions and in some types of cancer. Also called FGFR1 gene.
  fibroblast growth factor receptor 2 gene: (FY-broh-blast grothe FAK-ter reh-SEP-ter … jeen)
    Pronunciation of dictionary term "fibroblast growth factor receptor 2 gene"
    A gene that makes a protein that is involved in cell division, cell maturation, formation of new blood vessels, wound healing, and bone growth and development. A mutation (change) in the fibroblast growth factor receptor 2 gene may cause the FGFR2 protein to become overactive in certain bone disorders, genetic conditions, and cancers. Also called FGFR2 gene.
  fibroblast growth factor receptor 3 gene: (FY-broh-blast grothe FAK-ter reh-SEP-ter … jeen)
    Pronunciation of dictionary term "fibroblast growth factor receptor 3 gene"
    A gene that makes a protein that is involved in cell division, cell maturation, formation of new blood vessels, wound healing, and bone growth, development, and maintenance. A mutation (change) in the fibroblast growth factor receptor 3 gene may cause the FGFR3 protein to become overactive in certain bone disorders, genetic conditions, and cancers. Also called FGFR3 gene.
  fibrocystic breast changes: (FY-broh-SIS-tik brest CHAYN-jiz)
    Pronunciation of dictionary term "fibrocystic breast changes"
    A common condition marked by benign (not cancer) changes in breast tissue. These changes may include irregular lumps or cysts, breast swelling or discomfort, sensitive nipples, and itching. These symptoms may change throughout the menstrual cycle and usually stop after menopause. Fibrocystic breast changes can occur at any age but are most common in younger women. This condition does not increase the risk of breast cancer. Also called fibrocystic breasts.
  fibrocystic breast disease: (FY-broh-SIS-tik brest dih-ZEEZ)
    Pronunciation of dictionary term "fibrocystic breast disease"
    A common condition marked by benign (not cancer) changes in breast tissue. These changes may include irregular lumps or cysts, breast discomfort, sensitive nipples, and itching. These symptoms may change throughout the menstrual cycle and usually stop after menopause. Also called benign breast disease, fibrocystic breast changes, and mammary dysplasia.
  fibrocystic breasts: (FY-broh-SIS-tik brests)
    Pronunciation of dictionary term "fibrocystic breasts"
    A common condition marked by benign (not cancer) changes in breast tissue. These changes may include irregular lumps or cysts, breast swelling or discomfort, sensitive nipples, and itching. These symptoms may change throughout the menstrual cycle and usually stop after menopause. Fibrocystic breasts can occur at any age but are most common in younger women. This condition does not increase the risk of breast cancer. Also called fibrocystic breast changes.
  fibrofolliculoma: (FY-broh-fuh-LIH-kyoo-LOH-muh)
    Pronunciation of dictionary term "fibrofolliculoma"
    A rare, benign (not cancer) tumor that forms in a hair follicle (the opening on the skin through which hair grows). Fibrofolliculomas appear as small, raised, whitish bumps that usually occur on the face, ears, neck, and chest. They tend to grow slowly but can increase in size and number over time. Fibrofolliculomas often occur in patients with an inherited condition called Birt-Hogg-Dubé syndrome.
    Fibrofolliculomas are benign (not cancer) tumors that form in a hair follicle. Here they are shown on the face.
    Photograph of many small, whitish bumps on an individual’s face.
    Fibrofolliculomas are benign tumors of the hair follicle. They are commonly found on the face, as shown, but they are also often found on the ears, neck, and upper torso.
    Photograph of many small, whitish bumps on an individual’s face.
  fibroglandular breast tissue: (FY-broh-GLAN-juh-ler brest TIH-shoo)
    Pronunciation of dictionary term "fibroglandular breast tissue"
    A term used to describe breast tissue that is made up of fibrous connective tissue and glandular tissue (milk ducts and lobules). Fibroglandular breast tissue often appears dense on a mammogram, which may make it harder to find breast cancer or other changes in the breast.
  fibroid: (FY-broyd)
    Pronunciation of dictionary term "fibroid"
    A benign smooth-muscle tumor, usually in the uterus or gastrointestinal tract. Also called leiomyoma.
  fibromatosis: (FY-broh-muh-TOH-sis)
    Pronunciation of dictionary term "fibromatosis"
    A condition in which multiple fibromas develop. Fibromas are tumors (usually benign) that affect connective tissue.
  fibrosarcoma: (FY-broh-sar-KOH-muh)
    Pronunciation of dictionary term "fibrosarcoma"
    A type of soft tissue sarcoma that begins in fibrous tissue, which holds bones, muscles, and other organs in place.
  fibrosis: (fy-BROH-sis)
    Pronunciation of dictionary term "fibrosis"
    The growth of fibrous tissue.
  fibrous: (FY-brus)
    Pronunciation of dictionary term "fibrous"
    Containing or resembling fibers.
  fibrous connective tissue: (FY-brus kuh-NEK-tiv TIH-shoo)
    Pronunciation of dictionary term "fibrous connective tissue"
    A type of tissue that is mostly made up of tough protein fibers called collagen and cells called fibroblasts. Fibrous connective tissue supports, protects, and holds bones, muscles, and other tissues and organs in place. Ligaments, tendons, the inner layer of the skin, and the sclera (the white outer layer of the eye) are all types of fibrous connective tissue. Also called dense connective tissue.
  fiducial marker: (fih-DOO-shul MAR-ker)
    Pronunciation of dictionary term "fiducial marker"
    A medical device or small object placed in or on the body to mark an area for radiation treatment or surgery. For example, tiny gold seeds may be put into the prostate to mark a tumor before radiation therapy. This allows the doctor to give higher doses of radiation to the tumor with less harm to nearby healthy tissue.
  fifth cranial nerve: (fith KRAY-nee-ul nerv)
    Pronunciation of dictionary term "fifth cranial nerve"
    The main sensory nerve of the head and face, and the motor nerve of the muscles used in chewing. Also called trigeminal nerve.
  FIGC: A rare, inherited disorder that increases the risk of developing a type of stomach cancer called intestinal gastric adenocarcinoma. This cancer begins in the mucus-producing cells in the innermost lining of the stomach and tends to grow and spread more slowly than other types of stomach cancer. FIGC runs in families, but the gene involved in this disorder is not known. Also called familial intestinal gastric cancer.
  fight-or-flight syndrome: (fite … flite SIN-drome)
    Pronunciation of dictionary term "fight-or-flight syndrome"
    A group of changes that occur in the body to help a person fight or take flight in stressful or dangerous situations. This is the body’s way of helping to protect itself from possible harm. During fight or flight, certain hormones, such as adrenaline and cortisol, are released into the blood. This causes an increase in blood pressure, heart rate, and breathing. Other changes include an increase in blood sugar, alertness, muscle tension, and sweating.
  FIH study: (... STUH-dee)
    Pronunciation of dictionary term "FIH study"
    A type of clinical trial in which a new drug, procedure, or treatment is tested in humans for the first time. FIH studies take place after the new treatment has been tested in laboratory and animal studies and are usually done as phase I clinical trials. Also called first-in-human study.
  FIHP: A rare inherited condition in which one or more tumors form in the parathyroid glands (four pea-sized organs found on the thyroid) and cause them to make too much parathyroid hormone. The increased parathyroid hormone causes a loss of calcium from the bones and too much calcium in the blood. Also called familial isolated hyperparathyroidism.
    More Information
    - Familial isolated hyperparathyroidism (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2837/familial-isolated-hyperparathyroidism)
    - Familial isolated hyperparathyroidism (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-isolated-hyperparathyroidism/)
  filgrastim: (fil-GRAS-tim)
    Pronunciation of dictionary term "filgrastim"
    A drug used under the brand names Neupogen, Zarxio, and Nivestym to treat neutropenia (a lower-than-normal number of white blood cells), prevent infection, and prepare the blood for the collection of certain types of blood cells, and under the brand name Granix to treat neutropenia. Filgrastim is used in patients who have certain cancers and neutropenia caused by some types of chemotherapy and in patients who have severe chronic neutropenia that is not caused by cancer treatment. It is also used before an autologous stem cell transplant. Filgrastim helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor. Also called G-CSF and granulocyte colony-stimulating factor.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  filgrastim-SD/01: (fil-GRAS-tim ...)
    Pronunciation of dictionary term "filgrastim-SD/01"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Filgrastim-SD/01 helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called Fulphila, Neulasta, Nyvepria, pegfilgrastim, Udenyca, and Ziextenzo.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  filler: (FIH-ler)
    Pronunciation of dictionary term "filler"
    An inactive substance used to make a product bigger or easier to handle. For example, fillers are often used to make pills or capsules because the amount of active drug is too small to be handled conveniently.
  film mammography: (... ma-MAH-gruh-fee)
    Pronunciation of dictionary term "film mammography"
    A procedure that uses x-rays to take pictures of the inside of the breast and stores the images on x-ray film. Film mammography may be used to check for breast cancer and other changes in the breast, such as abnormal lumps, cysts, or calcifications (calcium deposits). Also called conventional mammography.
    More Information
    - Mammograms (https://www.cancer.gov/types/breast/mammograms-fact-sheet)
  filter: (FIL-ter)
    Pronunciation of dictionary term "filter"
    A material or device that allows certain substances to pass through it, while keeping other substances out. Filters may be used in cigarettes to help trap tar and other harmful substances found in tobacco smoke. In medicine, filter also means to remove toxins, poisons, or other harmful substances from the blood. For example, the kidneys remove waste and extra water from the blood (as urine). The liver also removes harmful substances from the blood.
  financial burden: (fy-NAN-shul BUR-den)
    Pronunciation of dictionary term "financial burden"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Financial burden can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have financial burden than people without cancer. Also called economic burden, economic hardship, financial distress, financial hardship, financial stress, and financial toxicity.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  financial distress: (fy-NAN-shul dih-STRES)
    Pronunciation of dictionary term "financial distress"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Financial distress can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have financial distress than people without cancer. Also called economic burden, economic hardship, financial burden, financial hardship, financial stress, and financial toxicity.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  financial hardship: (fy-NAN-shul HARD-ship)
    Pronunciation of dictionary term "financial hardship"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Financial hardship can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have financial hardship than people without cancer. Also called economic burden, economic hardship, financial burden, financial distress, financial stress, and financial toxicity.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  financial navigator: (fy-NAN-shul NA-vih-GAY-ter)
    Pronunciation of dictionary term "financial navigator"
    A person who works with patients and their families to help them reduce stress or hardship related to the cost of treatment for a medical condition, such as cancer. Financial navigators help patients understand their out-of-pocket expenses and what their health insurance plans may cover. Financial navigators may also help patients set up payment plans, find cost-saving methods for treatments, and improve access to health care services that the patient needs.
  financial stress: (fy-NAN-shul stres)
    Pronunciation of dictionary term "financial stress"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Financial stress can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have financial stress than people without cancer. Also called economic burden, economic hardship, financial burden, financial distress, financial hardship, and financial toxicity.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  financial toxicity: (fy-NAN-shul tok-SIH-sih-tee)
    Pronunciation of dictionary term "financial toxicity"
    In medicine, a term used to describe problems a patient has related to the cost of medical care. Not having health insurance or having a lot of costs for medical care not covered by health insurance can cause financial problems and may lead to debt and bankruptcy. Financial toxicity can also affect a patient’s quality of life and access to medical care. For example, a patient may not take a prescription medicine or may avoid going to the doctor to save money. Cancer patients are more likely to have financial toxicity than people without cancer. Also called economic burden, economic hardship, financial burden, financial distress, financial hardship, and financial stress.
    More Information
    - Financial Toxicity (Financial Distress) and Cancer Treatment
  finasteride: (fih-NAS-teh-ride)
    Pronunciation of dictionary term "finasteride"
    A drug used to reduce the amount of male hormone (testosterone) produced by the body.
    More Information
    - Prostate Cancer Prevention
  fine-needle aspiration biopsy: (... NEE-dul AS-pih-RAY-shun BY-op-see)
    Pronunciation of dictionary term "fine-needle aspiration biopsy"
    The removal of fluid, cells, or tissue with a thin needle for examination under a microscope. Also called FNA biopsy.
  Firmagon: (FER-muh-gon)
    Pronunciation of dictionary term "Firmagon"
    A drug used to treat advanced prostate cancer. Firmagon binds to gonadotropin-releasing hormone (GnRH) receptors in the pituitary gland. This causes the testicles to stop making testosterone. Firmagon may stop the growth of cancer cells that need testosterone to grow. It is a type of GnRH antagonist. Also called degarelix acetate.
    More Information
    - Degarelix (https://www.cancer.gov/about-cancer/treatment/drugs/degarelix)
  first-degree relative: (first-deh-GREE REH-luh-tiv)
    Pronunciation of dictionary term "first-degree relative"
    A way of describing how family members are related to each other when there are no other family members in the blood line between them. Examples of a first-degree relative are a parent, sibling, or child. Also called FDR.
    More Information
    - First Degree Relative (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/First-Degree-Relative)
  first-in-human study: (… HYOO-mun STUH-dee)
    Pronunciation of dictionary term "first-in-human study"
    A type of clinical trial in which a new drug, procedure, or treatment is tested in humans for the first time. First-in-human studies take place after the new treatment has been tested in laboratory and animal studies and are usually done as phase I clinical trials. Also called FIH study.
  first-line therapy: (... THAYR-uh-pee)
    Pronunciation of dictionary term "first-line therapy"
    The first treatment given for a disease. It is often part of a standard set of treatments, such as surgery followed by chemotherapy and radiation. When used by itself, first-line therapy is the one accepted as the best treatment. If it doesn’t cure the disease or it causes severe side effects, other treatment may be added or used instead. Also called induction therapy, primary therapy, and primary treatment.
  FISH: A laboratory method used to look at genes or chromosomes in cells and tissues. Pieces of DNA that contain a fluorescent dye are made in the laboratory and added to a cell or tissue sample. When these pieces of DNA bind to certain genes or areas on chromosomes in the sample, they light up when viewed under a microscope with a special light. FISH can be used to identify where a specific gene is located on a chromosome, how many copies of the gene are present, and any chromosomal abnormalities. It is used to help diagnose diseases, such as cancer, and help plan treatment. Also called fluorescence in situ hybridization.
    More Information
    - Fluorescence In Situ Hybridization (FISH) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Fluorescence-In-Situ-Hybridization)
  fistula: (FIS-chuh-luh)
    Pronunciation of dictionary term "fistula"
    An abnormal opening or passage between two organs or between an organ and the surface of the body. Fistulas may be caused by injury, infection, or inflammation, or may be created during surgery.
  FIT: A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card for testing. The test uses an antibody that binds to a blood protein called hemoglobin to detect any blood. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called fecal immunochemical test, iFOBT, immunoassay fecal occult blood test, immunochemical fecal occult blood test, and immunologic fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
  five element acupuncture: (… EH-leh-ment AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "five element acupuncture"
    An ancient form of acupuncture based on the principle that there are five universal elements (wood, fire, earth, metal, and water) that affect a person's emotions, personality, health, and response to treatment. Each person is affected by one element more than the others. Also called traditional acupuncture.
  five-year survival rate: (... ser-VY-vul ...)
    Pronunciation of dictionary term "five-year survival rate"
    The percentage of people in a study or treatment group who are alive five years after they were diagnosed with or started treatment for a disease, such as cancer. The disease may or may not have come back.
  FK463: An antibiotic/antifungal drug used to treat infection.
  Flagyl: (FLA-jul)
    Pronunciation of dictionary term "Flagyl"
    A drug that is used to treat infection and is being studied in the treatment of cancer. It is type of antibacterial, antiprotozoal, and anthelmintic. Also called metronidazole.
  flavonoid: (FLAY-vuh-noyd)
    Pronunciation of dictionary term "flavonoid"
    A member of a group of substances found in many plants and plant-based foods. Flavonoids have shown antioxidant effects.
  flavopiridol: (FLAH-voh-PIH-rih-dol)
    Pronunciation of dictionary term "flavopiridol"
    A substance being studied in the treatment of several types of cancer. It stops cells from dividing and may kill cancer cells. It is a type of cyclin-dependent kinase (CDK) inhibitor. Also called alvocidib and HMR 1275.
  flaxseed: (FLAX-seed)
    Pronunciation of dictionary term "flaxseed"
    The seed of the flax plant. It is a rich source of omega-3 fatty acid, fiber, and a compound called lignin. It is being studied in the prevention of several types of cancer. Also called linseed.
  FLCN gene: (… jeen)
    Pronunciation of dictionary term "FLCN gene"
    A gene that makes a protein that may help control cell growth and other important cell functions. Mutated (changed) forms of the FLCN gene may increase the growth of abnormal cells. The mutated FLCN gene has been found in an inherited condition called Birt-Hogg-Dube syndrome (BHDS). Patients with BHDS have an increased risk of kidney cancer and tumors of the skin and lungs. The FLCN gene is a type of tumor suppressor gene. Also called folliculin gene.
    More Information
    - Hereditary Kidney Cancer Syndromes
  flecainide: (FLEH-kuh-nide)
    Pronunciation of dictionary term "flecainide"
    A drug used to treat abnormal heart rhythms. It may also relieve neuropathic pain, the burning, stabbing, or stinging pain that may arise from damage to nerves caused by some types of cancer or cancer treatment.
  Flomax: (FLOH-max)
    Pronunciation of dictionary term "Flomax"
    A drug used to treat urinary problems caused by an enlarged prostate. Flomax relaxes the muscles of the prostate and bladder, which helps the flow of urine. It is a type of alpha blocker. Also called tamsulosin hydrochloride.
  flow chart: (floh …)
    Pronunciation of dictionary term "flow chart"
    A diagram that shows the order of steps in a complex process. Also called flow sheet.
  flow cytometry: (floh sy-TAH-meh-tree)
    Pronunciation of dictionary term "flow cytometry"
    A laboratory method that measures the number of cells, the percentage of live cells, and certain characteristics of cells, such as size and shape, in a sample of blood, bone marrow, or other tissue. The presence of tumor markers, such as antigens, on the surface of the cells are also measured. The cells are stained with a light-sensitive dye, placed in a fluid, and then passed one at a time through a beam of light. The measurements are based on how the stained cells react to the beam of light. Flow cytometry is used in basic research and to help diagnose and manage certain diseases, including cancer.
  flow sheet: (floh …)
    Pronunciation of dictionary term "flow sheet"
    A diagram that shows the order of steps in a complex process. Also called flow chart.
  floxuridine: (flox-YOOR-ih-deen)
    Pronunciation of dictionary term "floxuridine"
    A drug used in the treatment of cancer. It is a type of antimetabolite.
  FLT3 gene: (… jeen)
    Pronunciation of dictionary term "FLT3 gene"
    A gene that makes a protein that is involved in the formation and growth of new blood cells. Mutated (changed) forms of the FLT3 gene may cause an overactive FLT3 protein to be made. This may cause the body to make too many immature white blood cells. These changes have been found in some types of leukemia, including acute myeloid leukemia (AML) and acute lymphoblastic leukemia (ALL).
  flt3L: A drug that increases the number of immune cells and may stimulate the immune system to kill cancer cells.
  flu-like symptoms: (floo … SIMP-tums)
    Pronunciation of dictionary term "flu-like symptoms"
    A group of symptoms that are similar to those caused by the influenza (flu) virus. These include fever, chills, headache, muscle or body aches, cough, sore throat, runny nose, fatigue, nausea, vomiting, and diarrhea. Flu-like symptoms may be caused by viral infections or other illnesses that are not caused by the influenza virus. They may also occur as a side effect of certain types of anticancer therapy, especially biological therapies, such as interferon or interleukin. Also called flu-like syndrome.
  flu-like syndrome: (floo … SIN-drome)
    Pronunciation of dictionary term "flu-like syndrome"
    A group of symptoms that are similar to those caused by the influenza (flu) virus. These include fever, chills, headache, muscle or body aches, cough, sore throat, runny nose, fatigue, nausea, vomiting, and diarrhea. Flu-like syndrome may be caused by viral infections or other illnesses that are not caused by the influenza virus. It may also occur as a side effect of certain types of anticancer therapy, especially biological therapies, such as interferon or interleukin. Also called flu-like symptoms.
  fluconazole: (floo-KAH-nuh-zole)
    Pronunciation of dictionary term "fluconazole"
    A drug that treats infections caused by fungi.
  flucytosine: (floo-SY-toh-seen)
    Pronunciation of dictionary term "flucytosine"
    A drug that treats infections caused by fungi.
  Fludara: (floo-DAR-uh)
    Pronunciation of dictionary term "Fludara"
    A drug used to treat B-cell chronic lymphocytic leukemia (CLL) that has not responded to treatment with other anticancer drugs or that has gotten worse. It is also being studied in the treatment of other types of cancer. Fludara blocks cells from making DNA and may kill cancer cells. It is a type of purine antagonist and a type of ribonucleotide reductase inhibitor. Also called fludarabine phosphate.
  fludarabine: (floo-DAR-uh-been)
    Pronunciation of dictionary term "fludarabine"
    The active ingredient in a drug used to treat B-cell chronic lymphocytic leukemia (CLL) that has not responded to treatment with other anticancer drugs or that has gotten worse. Fludarabine blocks cells from making DNA and may kill cancer cells. It is a type of purine antagonist and a type of ribonucleotide reductase inhibitor.
    More Information
    - Fludarabine Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/fludarabinephosphate)
  fludarabine phosphate: (floo-DAR-uh-been FOS-fayt)
    Pronunciation of dictionary term "fludarabine phosphate"
    A drug used with other drugs to treat adults with B-cell chronic lymphocytic leukemia and alone to treat adults with B-cell chronic lymphocytic leukemia that did not respond to or got worse during treatment with at least one therapy that included an alkylating agent. It is also being studied in the treatment of other types of cancer. Fludarabine phosphate stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Fludarabine Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/fludarabinephosphate)
  fludrocortisone: (floo-droh-KOR-tih-sone)
    Pronunciation of dictionary term "fludrocortisone"
    A synthetic corticosteroid. It is used to replace steroid hormones normally produced by the adrenal gland.
  fluid: (FLOO-id)
    Pronunciation of dictionary term "fluid"
    A substance that flows smoothly and takes the shape of its container. Liquids and gases are fluids.
  fluid deprivation test: (FLOO-id DEH-prih-VAY-shun …)
    Pronunciation of dictionary term "fluid deprivation test"
    A test to measure how much urine is made and how concentrated it becomes when no fluid is given to a patient for a certain amount of time. This test is used to see how well the kidneys work and to help diagnose diabetes insipidus (a condition in which a person is very thirsty and makes large amounts of urine). Also called water deprivation test.
  fluid replacement therapy: (FLOO-id reh-PLAYS-ment THAYR-uh-pee)
    Pronunciation of dictionary term "fluid replacement therapy"
    Treatment to replace fluids that are lost from the body because of surgery, injury, dehydration, disease, or other conditions.
  fluorescein angiography: (floor-EH-seen an-jee-AH-gruh-fee)
    Pronunciation of dictionary term "fluorescein angiography"
    A procedure that uses a special dye and camera to look at the blood vessels in the back of the eye. A yellow dye called fluorescein is injected into a vein and travels throughout the body, including the blood vessels in the eye. The dye causes the blood vessels to light up when a picture is taken with a special camera. Fluorescein angiography may be used to check for damaged, blocked, or leaking blood vessels in the eye, swelling in the retina, and other eye problems, including macular degeneration and a type of eye cancer called intraocular melanoma. It may also be used to see how well certain eye treatments are working.
  fluorescence in situ hybridization: (floor-EH-sents in SY-too HY-brih-dih-ZAY-shun)
    Pronunciation of dictionary term "fluorescence in situ hybridization"
    A laboratory method used to look at genes or chromosomes in cells and tissues. Pieces of DNA that contain a fluorescent dye are made in the laboratory and added to a cell or tissue sample. When these pieces of DNA bind to certain genes or areas on chromosomes in the sample, they light up when viewed under a microscope with a special light. FISH can be used to identify where a specific gene is located on a chromosome, how many copies of the gene are present, and any chromosomal abnormalities. It is used to help diagnose diseases, such as cancer, and help plan treatment. Also called FISH.
    More Information
    - Fluorescence In Situ Hybridization (FISH) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Fluorescence-In-Situ-Hybridization)
  fluorescence microscopy: (floor-EH-sents my-KROS-koh-pee)
    Pronunciation of dictionary term "fluorescence microscopy"
    The use of a special microscope to see objects that give off fluorescent light. For example, cells or tissue can be treated with a substance that contains a fluorescent dye. The dye lights up when viewed under a microscope with a special light.
  fluorescence-guided surgery: (floor-EH-sents-GY-ded SER-juh-ree)
    Pronunciation of dictionary term "fluorescence-guided surgery"
    Surgery that uses a fluorescent substance and a special microscope to show tumor margins (edges) so that more of the tumor can be removed. The substance is given by mouth and is taken up by fast-growing cells. These cells light up when seen under a microscope with a special blue light. This may help doctors to remove as much tumor as possible without harming healthy tissue. Fluorescence-guided surgery is being studied in the treatment of certain types of brain tumors.
  fluoride: (FLOOR-ide)
    Pronunciation of dictionary term "fluoride"
    A form of the element fluorine that helps prevent tooth decay. Fluoride may be naturally present in drinking water or may be added to it. Fluoride may also be put directly on the teeth, as a gel, toothpaste, or a rinse.
    More Information
    - Fluoridated Water (https://www.cancer.gov/about-cancer/causes-prevention/risk/myths/fluoridated-water-fact-sheet)
  fluorine F 18-16 alpha-fluoroestradiol: (FLOOR-een … AL-fuh-FLOOR-oh-es-truh-DY-ol)
    Pronunciation of dictionary term "fluorine F 18-16 alpha-fluoroestradiol"
    A radiolabeled substance being studied as an imaging agent in breast cancer. Fluorine F 18-16 alpha-fluoroestradiol binds to estrogen receptors and gives off radiation that can be detected by a positron emission tomography (PET) scan. The PET scan forms an image that shows where cancer cells with estrogen receptors can be found in the body. Also called 18F-16 alpha-fluoroestradiol and 18F-FES.
  fluorine F 18-EF5: (FLOOR-een ...)
    Pronunciation of dictionary term "fluorine F 18 EF5"
    A radioactive substance being studied in positron emission tomography (PET) imaging to find cancer cells that have a low level of oxygen. This may help predict how well the cancer will respond to treatment. Also called 18F-EF5.
  fluorine F 18-FEQA: (FLOOR-een …)
    Pronunciation of dictionary term "fluorine F 18 FEQA"
    A radioactive substance being studied in positron emission tomography (PET) imaging to diagnose cancer and to find out how well some types of cancer respond to treatment. Fluorine F 18-FEQA binds to the epidermal growth factor receptor (EGFR), which is found on some cancer cells. The PET scan forms an image that shows where cancer cells with EGFR can be found in the body.
  fluorine F 18-fludeoxyglucose: (FLOOR-een ... FLOO-dee-OK-see-GLOO-kose)
    Pronunciation of dictionary term "fluorine F 18-fludeoxyglucose"
    A radioactive form of glucose used in positron emission tomography (PET) imaging. Fluorine F 18-fludeoxyglucose gets taken up by cells in the body, and a PET scanner is used to find which cells in the body have taken it up. Since more fluorine F 18-fludeoxyglucose is taken up by abnormal cells, including cancer cells, than by normal cells, it can be used to find cancer cells in the body and to diagnose cancer and other conditions. Also called 18F-fludeoxyglucose.
  fluorine F 18-fluoromethylcholine: (FLOOR-een … FLOOR-oh-MEH-thul-KOH-leen)
    Pronunciation of dictionary term "fluorine F 18 fluoromethylcholine"
    A radioactive substance being studied in positron emission tomography (PET) imaging to find certain types of cancer. Fluorine F 18-fluoromethylcholine gets taken up by cells in the body and more of it is taken up by cancer cells than by normal cells. A PET scanner is used to find which cells in the body have taken up fluorine F 18-fluoromethylcholine. Also called 18F-choline, 18F-fluoromethylcholine, and 18F-FMCH.
  fluorine F 18-fluoromisonidazole: (FLOOR-een ... FLOOR-oh-MY-soh-NIH-duh-zole)
    Pronunciation of dictionary term "fluorine F 18-fluoromisonidazole"
    A radioactive substance being studied as an imaging agent in head and neck cancer and other types of cancer. It binds to large molecules in cancer cells that have a low level of oxygen. Radiation given off by fluorine F 18-fluoromisonidazole is detected by a positron emission tomography (PET) scan. Knowing the amount of fluorine F 18-fluoromisonidazole in the cancer cells may help plan the best treatment and help predict whether the cancer will come back after treatment. Also called 18F-fluoromisonidazole, 18F-MISO, and FMISO.
  fluorine F 18-fluorothymidine: (FLOOR-een ... FLOOR-oh-THY-mih-deen)
    Pronunciation of dictionary term "fluorine F 18-fluorothymidine"
    A radioactive substance being studied in the diagnosis of cancer. Fluorine F 18-fluorothymidine is injected into the blood and builds up in cells that are dividing, including cancer cells. The radiation that it gives off as it decays (breaks down) helps make clear pictures of tumors during a positron emission tomography (PET) scan. Also called 18F-FLT, 18F-fluorothymidine, and 3’-deoxy-3’-(18F) fluorothymidine.
  fluorine F 18-sodium fluoride PET: (FLOOR-een … SOH-dee-um FLOOR-ide …)
    Pronunciation of dictionary term "fluorine F 18 sodium fluoride PET"
    A procedure used to find out if cancer has spread to the bone. A small amount of a radioactive substance called fluorine F 18-sodium fluoride is injected into a vein. A PET scan is then used to make detailed pictures of the bones. Bones with cancer in them take up more fluorine F 18-sodium fluoride than normal bones do. Also called 18F-NaF PET and 18F-sodium fluoride positron emission tomography.
  Fluoroplex: (FLOOR-oh-plex)
    Pronunciation of dictionary term "Fluoroplex"
    A drug that contains the active ingredient fluorouracil and is used as a cream to treat actinic keratosis (a skin condition that may become cancer). Fluoroplex stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  fluoropyrimidine: (FLOOR-oh-py-RIH-mih-deen)
    Pronunciation of dictionary term "fluoropyrimidine"
    One of a group of substances used to treat cancer. A fluoropyrimidine is a type of antimetabolite. Examples are capecitabine, floxuridine, and fluorouracil (5-FU).
  fluoroquinolone: (FLOOR-oh-KWIH-noh-lone)
    Pronunciation of dictionary term "fluoroquinolone"
    A type of drug used to prevent and treat infections.
  fluoroscope: (FLOOR-oh-skope)
    Pronunciation of dictionary term "fluoroscope"
    An x-ray machine that makes it possible to see internal organs in motion.
  fluoroscopy: (floor-OS-koh-pee)
    Pronunciation of dictionary term "fluoroscopy"
    An x-ray procedure that makes it possible to see internal organs in motion.
  fluorouracil: (floor-oh-YOOR-uh-sil)
    Pronunciation of dictionary term "fluorouracil"
    A drug given as an injection to treat cancers of the breast, colon, rectum, stomach, and pancreas and as a cream to treat actinic keratosis (a skin condition that may become cancer) and certain types of basal cell skin cancer. It is used under the brand names Carac, Tolak, Efudex, and Fluoroplex to treat actinic keratosis. It is also used under the brand name Efudex to treat basal cell skin cancer. Fluorouracil is also being studied in the treatment of other conditions and types of cancer. It stops cells from making DNA and may kill cancer cells. Fluorouracil is a type of antimetabolite. Also called 5-fluorouracil and 5-FU.
    More Information
    - Fluorouracil Injection (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil)
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  fluoxetine: (floo-OK-seh-teen)
    Pronunciation of dictionary term "fluoxetine"
    A drug used to treat depression. It is a type of antidepressant.
  fluphenazine: (floo-FEH-nuh-zeen)
    Pronunciation of dictionary term "fluphenazine"
    A drug that is used to treat mental and emotional disorders and is being studied in the treatment of multiple myeloma. Fluphenazine may stop tumor growth by keeping myeloma cells from dividing and causing them to die. It is a type of antipsychotic. Also called fluphenazine hydrochloride.
  fluphenazine hydrochloride: (floo-FEH-nuh-ZEEN HY-droh-KLOR-ide)
    Pronunciation of dictionary term "fluphenazine hydrochloride"
    A drug that is used to treat mental and emotional disorders and is being studied in the treatment of multiple myeloma. Fluphenazine hydrochloride may stop tumor growth by keeping myeloma cells from dividing and causing them to die. It is a type of antipsychotic.
  flutamide: (FLOO-tuh-mide)
    Pronunciation of dictionary term "flutamide"
    A drug used with another drug to treat certain types of prostate cancer. Flutamide binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Flutamide blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen.
    More Information
    - Flutamide (https://www.cancer.gov/about-cancer/treatment/drugs/flutamide)
  fluvoxamine: (floo-VOK-suh-meen)
    Pronunciation of dictionary term "fluvoxamine"
    A drug used to treat obsessive-compulsive disorder. It is a type of antidepressant agent and selective serotonin reuptake inhibitor (SSRI). Also called Luvox.
  FMISO: A radioactive substance being studied as an imaging agent in head and neck cancer and other types of cancer. It binds to large molecules in cancer cells that have a low level of oxygen. Radiation given off by FMISO is detected by a positron emission tomography (PET) scan. Knowing the amount of FMISO in the cancer cells may help plan the best treatment and help predict whether the cancer will come back after treatment. Also called 18F-fluoromisonidazole, 18F-MISO, and fluorine F 18-fluoromisonidazole.
  FNA biopsy: (... BY-op-see)
    Pronunciation of dictionary term "FNA biopsy"
    The removal of fluid, cells, or tissue with a thin needle for examination under a microscope. Also called fine-needle aspiration biopsy.
  FOBT: A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card and sent to a doctor or laboratory for testing. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Guaiac FOBT and immunochemical FOBT are two types of FOBTs. Guaiac FOBT uses a chemical substance called guaiac to check for blood in the stool. Immunochemical FOBT uses an antibody to check for blood in the stool. Also called fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
    A guaiac fecal occult blood test (FOBT) checks for occult (hidden) blood in the stool. Small samples of stool are placed on a special card and returned to a doctor or laboratory for testing.
    Guaiac fecal occult blood test (FOBT) kit; shows card, applicator, and return envelope.
  focal: (FOH-kul)
    Pronunciation of dictionary term "focal"
    In terms of cancer, limited to a specific area.
  folate: (FOH-layt)
    Pronunciation of dictionary term "folate"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Folate helps to make red blood cells. It is found in whole-grain breads and cereals, liver, green vegetables, orange juice, lentils, beans, and yeast. Folate is water-soluble (can dissolve in water) and must be taken in every day. Not enough folate can cause anemia (a condition in which the number of red blood cells is below normal), diseases of the heart and blood vessels, and defects in the brain and spinal cord in a fetus. Folate is being studied with vitamin B12 in the prevention and treatment of cancer. Also called folic acid.
    More Information
    - Prostate Cancer Prevention
  folate antagonist: (FOH-layt an-TA-guh-nist)
    Pronunciation of dictionary term "folate antagonist"
    A type of drug that stops cells from using folic acid to make DNA and may kill cancer cells. Certain folate antagonists are used to treat some types of cancer and inflammatory conditions, such as rheumatoid arthritis. Also called antifolate and folic acid antagonist.
  folate receptor alpha positive: (FOH-layt reh-SEP-ter-AL-fuh PAH-zih-tiv)
    Pronunciation of dictionary term "folate receptor alpha positive"
    Describes cells that have a protein called folate receptor alpha on their surface. This protein is involved in the movement of folate into cells. Folate is a nutrient rapidly dividing cells need to make and repair DNA. Some ovary, breast, lung, and endometrium cancers may be folate receptor alpha positive. Cancer cells that make too much folate receptor alpha may grow more quickly and spread to other parts of the body. Knowing whether a cancer is folate receptor alpha positive may help plan treatment.
  FOLFIRI: An abbreviation for a chemotherapy combination used to treat advanced colorectal cancer that has spread. It is also being studied in the treatment of other types of cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and irinotecan hydrochloride. Also called FOLFIRI regimen.
    More Information
    - FOLFIRI (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRI)
  FOLFIRI regimen: (… REH-jih-men)
    Pronunciation of dictionary term "FOLFIRI regimen"
    An abbreviation for a chemotherapy combination used to treat advanced colorectal cancer that has spread. It is also being studied in the treatment of other types of cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and irinotecan hydrochloride. Also called FOLFIRI.
    More Information
    - FOLFIRI (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRI)
  FOLFIRI-Avastin regimen: (…uh-VAS-tin REH-jih-men)
    Pronunciation of dictionary term "FOLFIRI-Avastin regimen"
    A chemotherapy combination used as an initial treatment of colorectal cancer that has spread. It includes the drugs leucovorin (folinic acid), fluorouracil, irinotecan hydrochloride, and bevacizumab. Also called FOLFIRI-bevacizumab and FOLFIRI-bevacizumab regimen.
    More Information
    - FOLFIRI-BEVACIZUMAB (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRI-BEVACIZUMAB)
  FOLFIRI-bevacizumab: (... beh-vuh-SIH-zoo-mab)
    Pronunciation of dictionary term "FOLFIRI-bevacizumab"
    A chemotherapy combination used as an initial treatment of colorectal cancer that has spread. It includes the drugs leucovorin (folinic acid), fluorouracil, irinotecan hydrochloride, and bevacizumab. Also called FOLFIRI-Avastin regimen and FOLFIRI-bevacizumab regimen.
    More Information
    - FOLFIRI-BEVACIZUMAB (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRI-BEVACIZUMAB)
  FOLFIRI-bevacizumab regimen: (…. beh-vuh-SIH-zoo-mab REH-jih-men)
    Pronunciation of dictionary term "FOLFIRI-bevacizumab regimen"
    A chemotherapy combination used as an initial treatment of colorectal cancer that has spread. It includes the drugs leucovorin (folinic acid), fluorouracil, irinotecan hydrochloride, and bevacizumab. Also called FOLFIRI-Avastin regimen and FOLFIRI-bevacizumab.
    More Information
    - FOLFIRI-BEVACIZUMAB (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRI-BEVACIZUMAB)
  FOLFIRI-cetuximab: (... seh-TUK-sih-mab)
    Pronunciation of dictionary term "FOLFIRI-cetuximab"
    A chemotherapy combination used to treat a certain type of colorectal cancer that has spread to other parts of the body. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, irinotecan hydrochloride, and cetuximab. Also called FOLFIRI-cetuximab regimen.
  FOLFIRI-cetuximab regimen: (... seh-TUK-sih-mab REH-jih-men)
    Pronunciation of dictionary term "FOLFIRI-cetuximab regimen"
    A chemotherapy combination used to treat a certain type of colorectal cancer that has spread to other parts of the body. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, irinotecan hydrochloride, and cetuximab. Also called FOLFIRI-cetuximab.
  FOLFIRINOX: An abbreviation for a chemotherapy combination used to treat pancreatic cancer that has spread to other parts of the body. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, irinotecan hydrochloride, and oxaliplatin. Also called FOLFIRINOX regimen.
    More Information
    - FOLFIRINOX (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRINOX)
  FOLFIRINOX regimen: (… REH-jih-men)
    Pronunciation of dictionary term "FOLFIRINOX regimen"
    An abbreviation for a chemotherapy combination used to treat pancreatic cancer that has spread to other parts of the body. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, irinotecan hydrochloride, and oxaliplatin. Also called FOLFIRINOX.
    More Information
    - FOLFIRINOX (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFIRINOX)
  FOLFOX: An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens, including FOLFOX-4, FOLFOX-6, modified FOLFOX-6 (mFOLFOX-6), and FOLFOX-7. They differ in the doses and ways in which the three drugs are given. Also called FOLFOX regimen.
    More Information
    - FOLFOX (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFOX)
  FOLFOX regimen: (… REH-jih-men)
    Pronunciation of dictionary term "FOLFOX regimen"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens, including FOLFOX-4, FOLFOX-6, modified FOLFOX-6 (mFOLFOX-6), and FOLFOX-7. They differ in the doses and ways in which the three drugs are given. Also called FOLFOX.
    More Information
    - FOLFOX (https://www.cancer.gov/about-cancer/treatment/drugs/FOLFOX)
  FOLFOX-4: An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called FOLFOX-4 regimen.
  FOLFOX-4 regimen: (... REH-jih-men)
    Pronunciation of dictionary term "FOLFOX-4 regimen"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called FOLFOX-4.
  FOLFOX-6: An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called FOLFOX-6 regimen.
  FOLFOX-6 regimen: (... REH-jih-men)
    Pronunciation of dictionary term "FOLFOX-6 regimen"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called FOLFOX-6.
  FOLFOX-7: An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called FOLFOX-7 regimen.
  FOLFOX-7 regimen: (... REH-jih-men)
    Pronunciation of dictionary term "FOLFOX-7 regimen"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called FOLFOX-7.
  folic acid: (FOH-lik A-sid)
    Pronunciation of dictionary term "folic acid"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Folic acid helps to make red blood cells. It is found in whole-grain breads and cereals, liver, green vegetables, orange juice, lentils, beans, and yeast. Folic acid is water-soluble (can dissolve in water) and must be taken in every day. Not enough folic acid can cause anemia (a condition in which the number of red blood cells is below normal), diseases of the heart and blood vessels, and defects in the brain and spinal cord in a fetus. Folic acid is being studied with vitamin B12 in the prevention and treatment of cancer. Also called folate.
    More Information
    - Prostate Cancer Prevention
  folic acid antagonist: (FOH-lik A-sid an-TA-guh-nist)
    Pronunciation of dictionary term "folic acid antagonist"
    A type of drug that stops cells from using folic acid to make DNA and may kill cancer cells. Certain folic acid antagonists are used to treat some types of cancer and inflammatory conditions, such as rheumatoid arthritis. Also called antifolate and folate antagonist.
  folinic acid: (foh-LIN-ik A-sid)
    Pronunciation of dictionary term "folinic acid"
    A form of folic acid used alone or with other drugs to treat certain types of colorectal cancer and anemia and to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. Folinic acid is also being studied in the treatment of other conditions and types of cancer. It is a type of chemoprotective agent and a type of chemosensitizing agent. Also called citrovorum factor and leucovorin calcium.
    More Information
    - Leucovorin Calcium (https://www.cancer.gov/about-cancer/treatment/drugs/leucovorincalcium)
  follicle: (FAH-lih-kul)
    Pronunciation of dictionary term "follicle"
    A sac or pouch-like cavity formed by a group of cells. In the ovaries, one follicle contains one egg. In the skin, one follicle contains one hair.
  follicle-stimulating hormone: (FAH-lih-kul-STIM-yoo-LAY-ting HOR-mone)
    Pronunciation of dictionary term "follicle-stimulating hormone"
    A hormone made in the pituitary gland. In females, it acts on the ovaries to make the follicles and eggs grow. In males, it acts on the testes to make sperm. Also called follitropin and FSH.
  follicular large cell lymphoma: (fuh-LIH-kyoo-ler larj sel lim-FOH-muh)
    Pronunciation of dictionary term "follicular large cell lymphoma"
    A rare type of non-Hodgkin lymphoma (cancer that begins in the cells of the immune system) that is marked by enlarged lymph nodes and large cancer cells that may look cleaved (u-shaped) under the microscope. Follicular large cell lymphoma is treated as aggressive (fast-growing) lymphoma, but it sometimes recurs years later and acts like indolent (slow-growing) lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  follicular lymphoma: (fuh-LIH-kyoo-ler lim-FOH-muh)
    Pronunciation of dictionary term "follicular lymphoma"
    A type of B-cell non-Hodgkin lymphoma (cancer of the immune system) that is usually indolent (slow-growing). The tumor cells grow as groups to form nodules. There are several subtypes of follicular lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  follicular mixed cell lymphoma: (fuh-LIH-kyoo-ler mikst sel lim-FOH-muh)
    Pronunciation of dictionary term "follicular mixed cell lymphoma"
    An indolent (slow-growing) type of B-cell non-Hodgkin lymphoma (cancer of the lymphatic system) in which there are both small and large cancer cells.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  follicular thyroid cancer: (fuh-LIH-kyoo-ler THY-royd KAN-ser)
    Pronunciation of dictionary term "follicular thyroid cancer"
    Cancer that forms in follicular cells in the thyroid. It grows slowly and is highly treatable.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
  folliculin gene: (fuh-LIH-kyoo-lin jeen)
    Pronunciation of dictionary term "folliculin gene"
    A gene that makes a protein that may help control cell growth and other important cell functions. Mutated (changed) forms of the folliculin gene may increase the growth of abnormal cells. The mutated folliculin gene has been found in an inherited condition called Birt-Hogg-Dube syndrome (BHDS). Patients with BHDS have an increased risk of kidney cancer and tumors of the skin and lungs. The folliculin gene is a type of tumor suppressor gene. Also called FLCN gene.
    More Information
    - Hereditary Kidney Cancer Syndromes
  folliculitis: (fuh-LIH-kyoo-LY-tis)
    Pronunciation of dictionary term "folliculitis"
    Inflammation of a follicle (a sac or pouch-like cavity), usually a hair follicle.
  follitropin: (FAH-lih-TROH-pin)
    Pronunciation of dictionary term "follitropin"
    A hormone made in the pituitary gland. In females, it acts on the ovaries to make the follicles and eggs grow. In males, it acts on the testes to make sperm. Also called follicle-stimulating hormone and FSH.
  follow-up: (FAH-loh-up)
    Pronunciation of dictionary term "follow-up"
    Monitoring a person's health over time after treatment. This includes keeping track of the health of people who participate in a clinical study or clinical trial for a period of time, both during the study and after the study ends.
    More Information
    - Follow-Up Medical Care (https://www.cancer.gov/about-cancer/coping/survivorship/follow-up-care)
  follow-up care: (FAH-loh-up kayr)
    Pronunciation of dictionary term "follow-up care"
    Care given to a patient over time after finishing treatment for a disease. Follow-up care involves regular medical checkups, which may include a physical exam, blood tests, and imaging tests. Follow-up care checks for health problems that may occur months or years after treatment ends, including the development of other types of cancer. Follow-up care is given after positive screening test results, such as a positive Pap test result. In cancer patients, one purpose of follow-up care is checking to see if the cancer has come back or has spread to other parts of the body.
    More Information
    - Follow-Up Medical Care (https://www.cancer.gov/about-cancer/coping/survivorship/follow-up-care)
  follow-up care plan: (FAH-loh-up kayr plan)
    Pronunciation of dictionary term "follow-up care plan"
    A detailed plan given to a patient after treatment ends, that contains a summary of the patient’s treatment, along with recommendations for follow-up care. In cancer, the plan is based on the type of cancer and the treatment the patient received. A follow-up care plan may include schedules for physical exams and medical tests to see if the cancer has come back or spread to other parts of the body. Getting follow-up care also helps check for health problems that may occur months or years after treatment ends, including other types of cancer. A follow-up care plan may also include information to help meet the emotional, social, legal, and financial needs of the patient. It may include referrals to specialists and recommendations for a healthy lifestyle, such as changes in diet and exercise and quitting smoking. Also called survivorship care plan.
    More Information
    - Follow-Up Medical Care (https://www.cancer.gov/about-cancer/coping/survivorship/follow-up-care)
  Folotyn: (FOH-loh-tin)
    Pronunciation of dictionary term "FOLOTYN"
    A drug used to treat peripheral T-cell lymphoma (a fast-growing form of non-Hodgkin lymphoma) that recurred (came back) or did not get better with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Folotyn stops cells from using folic acid to make DNA. This may help keep cancer cells from growing and may kill them. Folotyn is a type of antimetabolite and a type of dihydrofolate reductase inhibitor. Also called pralatrexate.
    More Information
    - Pralatrexate (https://www.cancer.gov/about-cancer/treatment/drugs/pralatrexate)
  fondaparinux: (fon-duh-PAYR-ih-nux)
    Pronunciation of dictionary term "fondaparinux"
    A drug used to prevent blood clots from forming inside blood vessels in the leg. It is being studied in the prevention of blood clots in some cancer patients, including women having surgery for cancer of the reproductive tract. It is a type of anticoagulant. Also called Arixtra and fondaparinux sodium.
  fondaparinux sodium: (fon-duh-PAYR-ih-nux SOH-dee-um)
    Pronunciation of dictionary term "fondaparinux sodium"
    A drug used to prevent blood clots from forming inside blood vessels in the leg. It is being studied in the prevention of blood clots in some cancer patients, including women having surgery for cancer of the reproductive tract. It is a type of anticoagulant. Also called Arixtra.
  Food and Drug Administration: (... ad-MIH-nih-STRAY-shun)
    Pronunciation of dictionary term "Food and Drug Administration"
    An agency in the U.S. federal government whose mission is to protect public health by making sure that food, cosmetics, and nutritional supplements are safe to use and truthfully labeled. The Food and Drug Administration also makes sure that drugs, medical devices, and equipment are safe and effective, and that blood for transfusions and transplant tissue are safe. Also called FDA.
    More Information
    - U.S. Food and Drug Administration (https://www.fda.gov/)
  foreign: (FOR-in)
    Pronunciation of dictionary term "foreign"
    In medicine, foreign describes something that comes from outside the body. A foreign substance in the body’s tissues, such as a bacterium or virus, may be recognized by the immune system as not belonging to the body. This causes an immune response. Other foreign substances in the body, such as artificial joints, are designed to not cause an immune response.
  foreskin: (FOR-skin)
    Pronunciation of dictionary term "foreskin"
    The loose skin that covers the head of the penis.
  foretinib: (for-eh-TIH-nib)
    Pronunciation of dictionary term "foretinib"
    A substance being studied in the treatment of cancer. Foretinib blocks enzymes involved in the growth and spread of tumor cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called MET/VEGFR-2 inhibitor GSK1363089 and XL880.
  Form FDA 1572-Statement of Investigator: (... STAYT-ment … in-VES-tih-GAY-ter)
    Pronunciation of dictionary term "Form FDA 1572-Statement of Investigator"
    A form that must be filed by an investigator running a clinical trial to study a new drug or agent. The investigator agrees to follow the U.S. Food and Drug Administration (FDA) Code of Federal Regulations for the clinical trial. The investigator verifies that he or she has the experience and background needed to conduct the trial and that it will be done in a way that is ethical and scientifically sound. Also called 1572 form.
  formaldehyde: (for-MAL-deh-hide)
    Pronunciation of dictionary term "formaldehyde"
    A chemical commonly used to kill germs and to preserve laboratory specimens and tissues. It is also used to make building materials (such as wood), glue, fabric, paint, fertilizers, pesticides, and other substances. Formaldehyde is also found in tobacco smoke and in the vapor made from burning fuel, such as the exhaust from cars or household stoves and heaters. It has a strong odor and catches fire easily. Formaldehyde is known to cause cancer. Being exposed to formaldehyde increases the risk of developing myeloid leukemia and cancers of the paranasal sinuses, nasal cavity, and nasopharynx.
    More Information
    - Formaldehyde (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/formaldehyde)
  forodesine: (FOR-oh-deh-seen)
    Pronunciation of dictionary term "forodesine"
    A substance being studied in the treatment of some types of leukemia and lymphoma. It is a type of purine nucleoside phosphorylase (PNP) inhibitor. Also called BCX-1777 and forodesine hydrochloride.
  forodesine hydrochloride: (FOR-oh-deh-seen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "forodesine hydrochloride"
    A substance being studied in the treatment of some types of leukemia and lymphoma. It is a type of purine nucleoside phosphorylase (PNP) inhibitor. Also called BCX-1777.
  fortified food: (FOR-tih-fide …)
    Pronunciation of dictionary term "fortified food"
    A food that has extra nutrients added to it or has nutrients added that are not normally there. Examples are milk with vitamin D added and salt with iodine added.
  Fosamax: (FAH-suh-max)
    Pronunciation of dictionary term "Fosamax"
    A drug used to treat certain bone conditions, such as osteoporosis and Paget disease of the bone. It is also being studied in the treatment of hypercalcemia (high levels of calcium in the blood) and bone pain caused by cancer. Fosamax slows the breakdown of bone and prevents the loss of calcium. It is a type of bisphosphonate. Also called alendronate sodium.
  foscarnet sodium: (fos-KAR-net SOH-dee-um)
    Pronunciation of dictionary term "foscarnet sodium"
    A drug used to treat infections with herpesviruses in people whose immune systems are weakened by AIDS. It blocks the viruses from making copies of themselves. It is a type of antiviral agent. Also called Foscavir and phosphonoformate trisodium.
  Foscavir: (FOS-kuh-veer)
    Pronunciation of dictionary term "Foscavir"
    A drug used to treat infections with herpesviruses in people whose immune systems are weakened by AIDS. It blocks the viruses from making copies of themselves. It is a type of antiviral agent. Also called foscarnet sodium and phosphonoformate trisodium.
  fostamatinib disodium: (FOS-tuh-MA-tih-nib dy-SOH-dee-um)
    Pronunciation of dictionary term "fostamatinib disodium"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults with chronic immune thrombocytopenia (ITP) that did not get better with other treatment. ITP is a condition in which platelets are destroyed by the immune system. Fostamatinib disodium is also being studied in the treatment of other conditions and types of cancer. It blocks an enzyme called Syk, which may help keep the immune system from destroying platelets. Fostamatinib disodium is a type of tyrosine kinase inhibitor. Also called R788 sodium, Syk kinase inhibitor R-935788, and Tavalisse.
  fotemustine: (foh-teh-MUS-teen)
    Pronunciation of dictionary term "fotemustine"
    A substance being studied in the treatment of advanced melanoma, glioblastoma (a type of brain tumor) that has come back, and certain types of lymphoma. Fotemustine damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea.
  Fotivda: (foh-TIV-dah)
    Pronunciation of dictionary term "Fotivda"
    A drug used to treat adults with advanced renal cell carcinoma (a type of kidney cancer). It is used in patients whose cancer has relapsed (come back) or has not gotten better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Fotivda blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Fotivda is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called tivozanib hydrochloride.
    More Information
    - Tivozanib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/tivozanibhydrochloride)
  FoundationOne CDx test: (fown-DAY-shun…)
    Pronunciation of dictionary term "FoundationOne CDx test"
    A laboratory test done on a tumor tissue sample to help match a patient's tumor to a specific drug or therapy. A FoundationOne CDx test looks at many different genes in the tissue sample to help identify whether a patient’s tumor has a specific gene mutation (change) or biomarker that is targeted by a particular drug or therapy. This helps determine whether the drug might be an effective treatment for the patient's tumor. A FoundationOne CDx test is a type of companion diagnostic test. FoundationOne is a registered trademark of Foundation Medicine, Inc. Also called F1CDx test.
  FR901228: A drug used to treat adults with cutaneous T-cell lymphoma that has already been treated with at least one other type of systemic therapy. It is also being studied in the treatment of other types of cancer. FR901228 blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of depsipeptide and a type of histone deacetylase inhibitor. Also called Istodax and romidepsin.
    More Information
    - Romidepsin (https://www.cancer.gov/about-cancer/treatment/drugs/romidepsin)
  fractionation: (FRAK-shuh-NAY-shun)
    Pronunciation of dictionary term "fractionation"
    A way of dividing a total dose of radiation or chemotherapy into separate doses that are larger or smaller than usual.
  Fragmin: (FRAG-min)
    Pronunciation of dictionary term "Fragmin"
    A drug used to prevent blood clots from forming or to treat blood clots that have formed in patients with cancer or other conditions. Fragmin is a type of anticoagulant. Also called dalteparin sodium.
  fragrance: (FRAY-grunts)
    Pronunciation of dictionary term "fragrance"
    A pleasant, sweet odor.
  frankincense tree: (FRAN-kin-SENTS…)
    Pronunciation of dictionary term "frankincense tree"
    A tree that belongs to the incense tree family. The tree’s amber-colored resin is used in incense. The resin has anti-inflammatory effects and has been used to treat arthritis, asthma, and ulcerative colitis. It is also being studied in the treatment of brain tumors. Also called Boswellia serrata.
  free flap: (… flap)
    Pronunciation of dictionary term "free flap"
    A type of surgery used to rebuild the shape of the breast after a mastectomy. A tissue flap, including blood vessels, skin, fat, and sometimes muscle, is removed from one area of the body, such as the back or abdomen. It is then reattached to the chest to form a new breast mound. The blood vessels from the tissue are reconnected to blood vessels under the arm or in the chest. A free flap is a type of breast reconstruction.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  free PSA: (free …)
    Pronunciation of dictionary term "free PSA"
    The amount of the protein prostate-specific antigen (PSA) in the blood that is not attached to other proteins. It is compared with the amount of PSA in the blood that is attached to other proteins. The amount of free PSA is higher in men with benign prostatic hyperplasia (BPH). The amount of PSA attached to other proteins is higher in men with prostate cancer.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  free radical: (free RA-dih-kul)
    Pronunciation of dictionary term "free radical"
    A type of unstable molecule that is made during normal cell metabolism (chemical changes that take place in a cell). Free radicals can build up in cells and cause damage to other molecules, such as DNA, lipids, and proteins. This damage may increase the risk of cancer and other diseases.
    More Information
    - Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet)
  free radical scavenger: (free RA-dih-kul SKA-ven-jer)
    Pronunciation of dictionary term "free radical scavenger"
    A substance, such as an antioxidant, that helps protect cells from the damage caused by free radicals. Free radicals are unstable molecules that are made during normal cell metabolism (chemical changes that take place in a cell). They can build up in cells and cause damage to other molecules. This damage may increase the risk of cancer and other diseases.
    More Information
    - Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet)
  freeze-dried: (freez-dride)
    Pronunciation of dictionary term "freeze-dried"
    A method used to dry substances, such as food, to make them last longer. The substance is frozen and then dried in a vacuum.
  fresolimumab: (FREH-soh-LIM-yoo-mab)
    Pronunciation of dictionary term "fresolimumab"
    A substance being studied in the treatment of breast cancer that has spread to other parts of the body. It is also being studied in the treatment of other cancers and conditions. Fresolimumab binds to a protein called transforming growth factor-beta (TGF-beta), which is found on some cancer cells. Fresolimumab may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. It is a type of monoclonal antibody and a type of antiangiogenesis agent. Also called anti-TGF-beta monoclonal antibody GC1008 and GC1008.
  frontal sinus: (FRUN-tul SY-nus)
    Pronunciation of dictionary term "frontal sinus"
    A type of paranasal sinus (a hollow space in the bones around the nose). There are two, large frontal sinuses in the frontal bone, which forms the lower part of the forehead and reaches over the eye sockets and eyebrows. The frontal sinuses are lined with cells that make mucus to keep the nose from drying out.
    Anatomy of the paranasal sinuses (spaces between the bones around the nose).
    Anatomy of the paranasal sinuses; drawing shows front and side views of the frontal sinus, ethmoid sinus, maxillary sinus, and sphenoid sinus. The nasal cavity and pharynx (throat) are also shown.
  fruit acid: (froot A-sid)
    Pronunciation of dictionary term "fruit acid"
    One of a group of substances that are found in several types of fruit and in milk. They are used in skin care products to reduce wrinkles and soften the skin. Examples of fruit acids are glycolic acid, lactic acid, and citric acid. Also called AHA and alpha hydroxyl acid.
  fruquintinib: (froo-KWIN-tih-nib)
    Pronunciation of dictionary term "fruquintinib"
    A drug used to treat adults with colorectal cancer that has spread to other parts of the body and has already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Fruquintinib blocks a protein called VEGFR, which may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of antiangiogenesis agent and a type of kinase inhibitor. Also called Fruzaqla.
    More Information
    - Fruquintinib (https://www.cancer.gov/about-cancer/treatment/drugs/fruquintinib)
  Fruzaqla: (froo-ZAH-klah)
    Pronunciation of dictionary term "Fruzaqla"
    A drug used to treat adults with colorectal cancer that has spread to other parts of the body and has already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Fruzaqla blocks a protein called VEGFR, which may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of antiangiogenesis agent and a type of kinase inhibitor. Also called fruquintinib.
    More Information
    - Fruquintinib (https://www.cancer.gov/about-cancer/treatment/drugs/fruquintinib)
  FSH: A hormone made in the pituitary gland. In females, it acts on the ovaries to make the follicles and eggs grow. In males, it acts on the testes to make sperm. Also called follicle-stimulating hormone and follitropin.
  Ftorafur: (FTOR-uh-fer)
    Pronunciation of dictionary term "Ftorafur"
    A substance being studied in the treatment of some types of cancer. It is a combination of tegafur and uracil. The tegafur is taken up by the cancer cells and breaks down into 5-FU, a substance that kills tumor cells. The uracil causes higher amounts of 5-FU to stay inside the cells and kill them. Ftorafur is a type of antimetabolite. Also called tegafur-uracil and UFT.
  fulguration: (ful-guh-RAY-shun)
    Pronunciation of dictionary term "fulguration"
    A procedure that uses heat from an electric current to destroy abnormal tissue, such as a tumor or other lesion. It may also be used to control bleeding during surgery or after an injury. The electric current passes through an electrode that is placed on or near the tissue. The tip of the electrode is heated by the electric current to burn or destroy the tissue. Fulguration is a type of electrosurgery. Also called electrocautery, electrocoagulation, and electrofulguration.
  full blood count: (… blud kownt)
    Pronunciation of dictionary term "full blood count"
    A measure of the number of red blood cells, white blood cells, and platelets in the blood. The amount of hemoglobin (substance in the blood that carries oxygen) and the hematocrit (the amount of whole blood that is made up of red blood cells) are also measured. A full blood count is used to help diagnose and monitor many conditions. Also called blood cell count, CBC, and complete blood count.
    Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
    Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
  Fulphila: (FUL-fih-luh)
    Pronunciation of dictionary term "Fulphila"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Fulphila helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called filgrastim-SD/01, Neulasta, Nyvepria, pegfilgrastim, Udenyca, and Ziextenzo.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  fulvestrant: (ful-VES-trunt)
    Pronunciation of dictionary term "fulvestrant"
    A drug used to treat certain types of breast cancer. It is used alone or with ribociclib succinate in postmenopausal women who have not been treated with hormone therapy or whose disease got worse after treatment with hormone therapy. It is also used with palbociclib or abemaciclib in women whose disease got worse after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. Fulvestrant binds to proteins called estrogen receptors, which are found in some breast cancer cells. These proteins may cause cancer cells to grow. Fulvestrant blocks these proteins and may keep cancer cells from growing. It is a type of antiestrogen. Also called Faslodex and ICI 182780.
    More Information
    - Fulvestrant (https://www.cancer.gov/about-cancer/treatment/drugs/fulvestrant)
  fumarase: (FYOO-muh-rays)
    Pronunciation of dictionary term "fumarase"
    An enzyme that helps cells in the body use oxygen and make energy. Mutations (changes) in the gene that makes fumarase may cause cells to lose the ability to use oxygen, which may increase the growth of some cells, including abnormal cells and cancer cells. Also called fumarate hydratase.
  fumarate hydratase: (FYOO-muh-rayt HY-druh-tays)
    Pronunciation of dictionary term "fumarate hydratase"
    An enzyme that helps cells in the body use oxygen and make energy. Mutations (changes) in the gene that makes fumarate hydratase may cause cells to lose the ability to use oxygen, which may increase the growth of some cells, including abnormal cells and cancer cells. Also called fumarase.
  fumarate hydratase gene: (FYOO-muh-rayt HY-druh-tays jeen)
    Pronunciation of dictionary term "fumarate hydratase gene"
    A gene that makes an enzyme that helps cells in the body use oxygen and make energy. Mutated (changed) forms of the fumarate hydratase gene may cause cells to lose the ability to use oxygen. This may increase the growth of some cells, including abnormal cells and cancer cells. The mutated fumarate hydratase gene has been found in an inherited condition called hereditary leiomyomatosis and renal cell cancer (HLRCC). Patients with HLRCC have an increased risk of kidney cancer and tumors in the skin and uterus. Also called FH gene.
    More Information
    - Hereditary Kidney Cancer Syndromes
  functional magnetic resonance imaging: (FUNK-shuh-nul mag-NEH-tik REH-zuh-nunts IH-muh-jing)
    Pronunciation of dictionary term "functional magnetic resonance imaging"
    A noninvasive tool used to observe functioning in the brain or other organs by detecting changes in chemical composition, blood flow, or both.
  functioning tumor: (FUNK-shuh-ning TOO-mer)
    Pronunciation of dictionary term "functioning tumor"
    A tumor that is found in endocrine tissue and makes hormones (chemicals that travel in the bloodstream and control the actions of other cells or organs).
  fundoscopy: (fun-DOS-koh-pee)
    Pronunciation of dictionary term "fundoscopy"
    An exam that uses a magnifying lens and a light to check the fundus of the eye (back of the inside of the eye, including the retina and optic nerve). The pupils may be dilated (enlarged) with medicated eye drops so the doctor can see through the pupil to the back of the eye. Fundoscopy may be used to check for eye problems, such as glaucoma, macular degeneration, eye cancer, optic nerve problems, or eye injury. Also called funduscopy and ophthalmoscopy.
  fundus: (FUN-dus)
    Pronunciation of dictionary term "fundus"
    The part of a hollow organ that is across from, or farthest away from, the organ’s opening. Depending on the organ, the fundus may be at the top or bottom of the organ. For example, the fundus of the uterus is the top part of the uterus that is across from the cervix (the opening of the uterus). The fundus of the bladder is the back, bottom part of the bladder. Certain organs, including the bladder, gallbladder, stomach, uterus, and eye, have a fundus.
  funduscopy: (fun-DUS-koh-pee)
    Pronunciation of dictionary term "funduscopy"
    An exam that uses a magnifying lens and a light to check the fundus of the eye (back of the inside of the eye, including the retina and optic nerve). The pupils may be dilated (enlarged) with medicated eye drops so the doctor can see through the pupil to the back of the eye. Funduscopy may be used to check for eye problems, such as glaucoma, macular degeneration, eye cancer, optic nerve problems, or eye injury. Also called fundoscopy and ophthalmoscopy.
  fungating lesion: (FUN-gayt-ing LEE-zhun)
    Pronunciation of dictionary term "fungating lesion"
    A type of skin lesion that is marked by ulcerations (breaks on the skin or surface of an organ) and necrosis (death of living tissue) and that usually has a bad smell. This kind of lesion may occur in many types of cancer, including breast cancer, melanoma, and squamous cell carcinoma, and especially in advanced disease.
  fungicide: (FUN-jih-side)
    Pronunciation of dictionary term "fungicide"
    Any substance used to kill fungi (plant-like organisms that do not make chlorophyll), such as yeast and molds.
  fungus: (FUN-gus)
    Pronunciation of dictionary term "fungus"
    A plant-like organism that does not make chlorophyll. Mushrooms, yeasts, and molds are examples. The plural is fungi.
  furanocoumarin: (fyoor-A-noh-KOO-muh-rin)
    Pronunciation of dictionary term "furanocoumarin"
    A substance that comes from certain plants and is found in citrus fruits, such as grapefruits, Seville oranges, pomelos, and limes. Although citrus fruits have health benefits, furanocoumarins can affect how certain enzymes in the liver and small intestine break down drugs. This may change the way certain drugs, such as anticancer drugs, work in the body.
  Fusilev: (FYOO-sih-lev)
    Pronunciation of dictionary term "Fusilev"
    A drug used to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. It is also used with fluorouracil as palliative therapy to treat advanced colorectal cancer. Fusilev is a form of folic acid. It is a type of chemoprotective agent and a type of chemosensitizing agent. Also called levoleucovorin calcium.
  fusion biopsy: (FYOO-zhun BY-op-see)
    Pronunciation of dictionary term "fusion biopsy"
    A biopsy procedure that combines the pictures from an MRI scan and an ultrasound to create a detailed 3-D image of the prostate. This procedure makes it easier to see an abnormal area of tissue in order to guide the biopsy needle into the abnormal area. A sample of tissue can then be removed and checked under a microscope for signs of cancer. A fusion biopsy may help find prostate cancer cells that may be missed with other types of biopsies. It may help find cancer at an early stage and plan cancer treatment. Also called MRI ultrasound fusion-guided biopsy.
  fusion gene: (FYOO-zhun jeen)
    Pronunciation of dictionary term "fusion gene"
    A gene made by joining parts of two different genes. Fusion genes, and the fusion proteins that come from them, may be made in the laboratory, or made naturally in the body when part of the DNA from one chromosome moves to another chromosome. Fusion proteins produced by this change may lead to the development of some types of cancer. For example, the BCR::ABL1 fusion gene and protein are found in some types of leukemia. Fusion genes and proteins may also be found in several other types of cancer, including soft tissue sarcoma, cancers of the prostate, breast, lung, bladder, colon, and rectum, and CNS tumors. Fusion genes and proteins are being studied in the diagnosis and treatment of cancer.
  fusion protein: (FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "fusion protein"
    A protein made from a fusion gene, which is created by joining parts of two different genes. Fusion genes may occur naturally in the body by transfer of DNA between chromosomes. For example, the BCR::ABL1 gene found in some types of leukemia is a fusion gene that makes the BCR::ABL1 fusion protein. Fusion genes and proteins can also be made in the laboratory by combining genes or parts of genes from the same or different organisms.
  futibatinib: (FYOO-tih-BA-tih-nib)
    Pronunciation of dictionary term "futibatinib"
    A drug used to treat adults with intrahepatic cholangiocarcinoma (a type of cancer that forms in the bile ducts inside the liver) that has spread or cannot be removed by surgery and has an FGFR2 gene fusion or other change in the structure of the FGFR2 gene. It is used in patients whose cancer has already been treated. It is also being studied in the treatment of other types of cancer. Futibatinib blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Lytgobi.
    More Information
    - Futibatinib (https://www.cancer.gov/about-cancer/treatment/drugs/futibatinib)
  Fyarro: (fy-AR-oh)
    Pronunciation of dictionary term "Fyarro"
    A form of the drug sirolimus that is used to treat adults with malignant perivascular epithelioid cell tumor that has spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Fyarro may have fewer side effects and work better than other forms of sirolimus. It binds to a protein called mTOR, which may help keep tumor cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Fyarro is a type of kinase inhibitor, a type of angiogenesis inhibitor, and a type of immunosuppressant. Also called sirolimus protein-bound particles.
    More Information
    - Sirolimus Protein-Bound Particles (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles)
  G-CSF: A drug used under the brand names Neupogen, Zarxio, and Nivestym to treat neutropenia (a lower-than-normal number of white blood cells), prevent infection, and prepare the blood for the collection of certain types of blood cells, and under the brand name Granix to treat neutropenia. G-CSF is used in patients who have certain cancers and neutropenia caused by some types of chemotherapy and in patients who have severe chronic neutropenia that is not caused by cancer treatment. It is also used before an autologous stem cell transplant. G-CSF helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor. Also called filgrastim and granulocyte colony-stimulating factor.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  G6PD deficiency: (… deh-FIH-shun-see)
    Pronunciation of dictionary term "G6PD deficiency"
    An inherited disorder in which a person doesn’t have enough of an enzyme called G6PD that helps red blood cells work the way they should. In G6PD deficiency, the red blood cells break down when the body is exposed to infection, severe stress, or certain drugs, chemicals, or foods. This may lead to a condition called hemolytic anemia. This disorder is most common in African-American men and in men of Middle Eastern or Mediterranean descent. Also called glucose-6-phosphate dehydrogenase deficiency.
    More Information
    - Glucose-6-phosphate dehydrogenase deficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6520/glucose-6-phosphate-dehydrogenase-deficiency)
    - Glucose-6-phosphate dehydrogenase deficiency (MedlinePlus) (https://medlineplus.gov/genetics/condition/glucose-6-phosphate-dehydrogenase-deficiency/)
  gabapentin: (GA-buh-PEN-tin)
    Pronunciation of dictionary term "gabapentin"
    A substance that is being studied as a treatment for relieving hot flashes in women with breast cancer. It belongs to the family of drugs called anticonvulsants.
  GAD: A condition marked by excessive worry and feelings of fear, dread, and uneasiness that last six months or longer. Other symptoms of GAD include being restless, being tired or irritable, muscle tension, not being able to concentrate or sleep well, shortness of breath, fast heartbeat, sweating, and dizziness. Also called generalized anxiety disorder.
  gadobenate dimeglumine: (GA-doh-BEH-nayt dy-MEG-loo-meen)
    Pronunciation of dictionary term "gadobenate dimeglumine"
    A drug used in MRI to help make clear pictures of blood vessels in the brain, spine, and nearby tissues. It is also being studied as a way to find abnormal areas in the liver and other organs and to help diagnose cancer. Gadobenate dimeglumine is a type of contrast agent. Also called MultiHance.
  gadolinium: (GA-duh-LIH-nee-um)
    Pronunciation of dictionary term "gadolinium"
    A metal element that is used in magnetic resonance imaging (MRI) and other imaging methods. It is a contrast agent, which helps show abnormal tissue in the body during imaging with a special machine.
  gadolinium texaphyrin: (GA-doh-LIH-nee-um tek-SA-fih-rin)
    Pronunciation of dictionary term "gadolinium texaphyrin"
    A substance being studied in the treatment and diagnosis of some types of cancer. It builds up in some cancer cells, which may make them easier to kill with radiation therapy and chemotherapy. Gadolinium texaphyrin is also used in magnetic resonance imaging (MRI) to help find cancer cells in the body. It is a type of radiosensitizing agent, a type of chemosensitizing agent, and a type of contrast agent. Also called motexafin gadolinium.
  gadopentetate dimeglumine: (GA-doh-PEN-teh-tayt dy-MEG-loo-meen)
    Pronunciation of dictionary term "gadopentetate dimeglumine"
    A substance used in magnetic resonance imaging (MRI) to help make clear pictures of the brain, spine, heart, soft tissue of joints, and inside bones. Gadopentetate dimeglumine is being studied in the diagnosis of cancer. It is a type of contrast agent. Also called Gd-DTPA and Magnevist.
  Gail model: (... MAH-dul)
    Pronunciation of dictionary term "Gail model"
    A computer program that uses personal and family medical history information to estimate a woman’s chance of developing breast cancer. Also called Gail risk model.
    More Information
    - The Breast Cancer Risk Assessment Tool (https://bcrisktool.cancer.gov/)
  Gail risk model: (... MAH-dul)
    Pronunciation of dictionary term "Gail risk model"
    A computer program that uses personal and family medical history information to estimate a woman’s chance of developing breast cancer. Also called Gail model.
    More Information
    - The Breast Cancer Risk Assessment Tool (https://bcrisktool.cancer.gov/)
  galactography: (GA-lak-TAH-gruh-fee)
    Pronunciation of dictionary term "galactography"
    A procedure that uses x-rays to create pictures of milk ducts in the breast. A very thin catheter (tube) is inserted into the nipple, and a small amount of dye is injected into the duct. This makes the duct easier to see on the x-ray. Galactography is used in patients who have a bloody or clear discharge from one nipple. A small amount of the fluid may be collected to check for infection or cancer cells. Galactography may be used to help diagnose certain breast conditions, such as papillomas (wart-like growths) in a milk duct, fibrocystic breast changes, and breast cancer. Also called ductography.
  galiximab: (guh-LIK-sih-mab)
    Pronunciation of dictionary term "galiximab"
    A substance being studied in the treatment of follicular non-Hodgkin lymphoma. It binds to the protein CD80, which is found on certain normal white blood cells and on white blood cells that are cancer. It is a type of monoclonal antibody.
  gallbladder: (GAWL-bla-der)
    Pronunciation of dictionary term "gallbladder"
    The pear-shaped organ found below the liver. Bile is concentrated and stored in the gallbladder.
    More Information
    - Gallbladder Cancer (https://www.cancer.gov/types/gallbladder)
    Anatomy of the gallbladder. The gallbladder is just below the liver. Bile is stored in the gallbladder and flows through the cystic duct and the common bile duct into the small intestine when food is being digested.
    Anatomy of the gallbladder; shows the liver, common hepatic duct, cystic duct, common bile duct, pancreas, and small intestine. The inset shows the liver, bile ducts, gallbladder, pancreas, and small intestine.
  gallbladder cancer: (GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "gallbladder cancer"
    Cancer that forms in tissues of the gallbladder. The gallbladder is a pear-shaped organ below the liver that collects and stores bile (a fluid made by the liver to digest fat). Gallbladder cancer begins in the innermost layer of tissue and spreads through the outer layers as it grows.
    More Information
    - Gallbladder Cancer (https://www.cancer.gov/types/gallbladder)
    Anatomy of the gallbladder. The gallbladder is just below the liver. Bile is stored in the gallbladder and flows through the cystic duct and the common bile duct into the small intestine when food is being digested.
    Anatomy of the gallbladder; shows the liver, common hepatic duct, cystic duct, common bile duct, pancreas, and small intestine. The inset shows the liver, bile ducts, gallbladder, pancreas, and small intestine.
  gallium nitrate: (GA-lee-um NY-trayt)
    Pronunciation of dictionary term "gallium nitrate"
    A drug that lowers blood calcium. Used as treatment for hypercalcemia (too much calcium in the blood) and for cancer that has spread to the bone (bone metastases).
  gallium scan: (GA-lee-um skan)
    Pronunciation of dictionary term "gallium scan"
    A procedure to detect areas of the body where cells are dividing rapidly. It is used to locate cancer cells or areas of inflammation. A very small amount of radioactive gallium is injected into a vein and travels through the bloodstream. The gallium is taken up by rapidly dividing cells in the bones, tissues, and organs and is detected by a scanner.
  gallstone: (GAWL-stone)
    Pronunciation of dictionary term "gallstone"
    Solid material that forms in the gallbladder or common bile duct. Gallstones are made of cholesterol or other substances found in the gallbladder. They may occur as one large stone or as many small ones, and vary from the size of a golf ball to a grain of sand. Also called cholelith.
  galvanic skin response: (gal-VA-nik ... reh-SPONTS)
    Pronunciation of dictionary term "galvanic skin response"
    A change in the heat and electricity passed through the skin by nerves and sweat. Galvanic skin response increases in certain emotional states and during hot flashes that happen with menopause. Also called electrodermal response and skin conduction.
  gamete: (GA-meet)
    Pronunciation of dictionary term "gamete"
    An egg cell in females or sperm cell in males. Each mature gamete contains 23 chromosomes. When an egg combines with sperm, the fertilized egg normally contains a total of 46 chromosomes. Also called reproductive cell and sex cell.
  Gamifant: (GA-mih-fant)
    Pronunciation of dictionary term "Gamifant"
    A drug used to treat a rare immune system disorder called primary hemophagocytic lymphohistiocytosis (HLH). It is used in patients whose disease came back, got worse, did not get better, or cannot be treated with other therapy. It is also being studied in the treatment of other conditions. Gamifant binds to an immune system protein called interferon gamma, which is found at higher than normal levels in patients with HLH. This may help lower the body’s immune response and reduce inflammation. Gamifant is a type of monoclonal antibody. Also called emapalumab.
    More Information
    - Emapalumab-lzsg (https://www.cancer.gov/about-cancer/treatment/drugs/emapalumab-lzsg)
  gamma irradiation: (GA-muh ih-RAY-dee-AY-shun)
    Pronunciation of dictionary term "gamma irradiation"
    A type of radiation therapy that uses gamma radiation. Gamma radiation is a type of high-energy radiation that is different from x-rays.
  Gamma Knife therapy: (GA-muh nife THAYR-uh-pee)
    Pronunciation of dictionary term "Gamma Knife therapy"
    A treatment using gamma rays, a type of high-energy radiation that can be tightly focused on small tumors or other lesions in the head or neck, so very little normal tissue receives radiation. The gamma rays are aimed at the tumor from many different angles at once, and deliver a large dose of radiation exactly to the tumor in one treatment session. This procedure is a type of stereotactic radiosurgery. Gamma Knife therapy is not a knife and is not surgery. Gamma Knife is a registered trademark of Elekta Instruments, Inc.
  gamma ray: (GA-muh ...)
    Pronunciation of dictionary term "gamma ray"
    A type of high-energy radiation that is different from an x-ray.
  gamma secretase: (GA-muh seh-KREE-tays)
    Pronunciation of dictionary term "gamma secretase"
    A protein complex found in the cell membrane that has an enzyme that cuts proteins, such as Notch and APP, into smaller pieces called peptides. When gamma secretase cuts Notch and APP at the wrong site, abnormal activation of Notch and APP cell signaling pathways may occur. This may cause uncontrolled cell growth and division and damaged cells to survive. Abnormalities in gamma secretase may lead to diseases such cancer and Alzheimer disease.
  gamma secretase inhibitor: (GA-muh seh-KREE-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "gamma secretase inhibitor"
    A substance that blocks the enzyme activity of a protein complex called gamma secretase. Gamma secretase is involved in the activation of several cell signaling proteins, including a protein called Notch. The Notch protein may be found at high levels on some types of cancer cells, which causes these cells to grow. Blocking gamma secretase may prevent the activation of Notch, which may help keep cancer cells from growing and may kill them. Some gamma secretase inhibitors are being studied in the treatment of cancer and other diseases. They are a type of targeted therapy.
  ganciclovir: (gan-SY-kloh-veer)
    Pronunciation of dictionary term "ganciclovir"
    An antiviral agent used to prevent or treat cytomegalovirus infections that may occur when the body's immune system is suppressed. In gene therapy, ganciclovir is used with an altered herpes simplex virus-1 gene to kill advanced melanoma cells and brain tumor cells.
  ganetespib: (guh-NEH-tes-pib)
    Pronunciation of dictionary term "ganetespib"
    A substance being studied in the treatment of some types of cancer. Ganetespib blocks the activity of a protein called HSP90. This prevents the breakdown of certain proteins inside cells. Blocking the activity of this protein in cancer cells may help keep the cells from dividing and cause them to die. It may also make cancer cells easier to kill with chemotherapy and radiation therapy. Ganetespib is a type of heat-shock protein inhibitor.
  ganglioside: (GANG-glee-oh-side)
    Pronunciation of dictionary term "ganglioside"
    A complex molecule that contains both lipids (fats) and carbohydrates (sugars) and is found in the plasma (outer) membrane of many kinds of cells. Several different types of gangliosides have been identified.
  GAPPS: A rare, inherited disorder in which many polyps (usually hundreds) form in the lining of the upper part of the stomach. Polyps are abnormal growths that may become cancer if they are not removed. People with GAPPS have an increased risk of developing a type of stomach cancer called intestinal gastric adenocarcinoma. This cancer begins in the mucus-producing cells in the innermost lining of the stomach. GAPPS is caused by certain mutations (changes) in a specific part of the APC gene. The age that people with one of these specific mutations in the APC gene develop GAPPS varies. Also called gastric adenocarcinoma and proximal polyposis of the stomach.
    More Information
    - Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-digestive-system-tumors/gastric-adenocarcinoma-and-proxymal-polyposis)
  Gardasil: (GAR-duh-sil)
    Pronunciation of dictionary term "Gardasil"
    A vaccine that is no longer available in the United States but is still used in other countries to protect against infection with four types of human papillomavirus (HPV). Gardasil is used in females and males aged 9 to 26 years to protect against low-risk HPV types 6 and 11, which cause most genital warts, and against high-risk HPV types 16 and 18, which cause most precancerous lesions and cancers of the cervix, vagina, vulva, and anus. Gardasil may also prevent HPV-related cancers of the penis and oropharynx. Also called recombinant human papillomavirus quadrivalent vaccine.
    More Information
    - Recombinant Human Papillomavirus (HPV) Quadrivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-quadrivalent-vaccine)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  Gardasil 9: (GAR-duh-sil …)
    Pronunciation of dictionary term "Gardasil 9"
    A vaccine that is FDA-approved for use in females and males aged 9 to 45 years to protect against infection with nine types of human papillomavirus (HPV). Gardasil 9 protects against low-risk HPV types 6 and 11, which cause most genital warts, and against high-risk HPV types 16, 18, 31, 33, 45, 52, and 58, which cause most precancerous lesions and cancers of the cervix, vagina, vulva, anus, and head and neck, including the oropharynx. Gardasil 9 may also prevent HPV-related cancer of the penis. Also called recombinant human papillomavirus nonavalent vaccine.
    More Information
    - Recombinant Human Papillomavirus (HPV) Nonavalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-nonavalent-vaccine)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  garden heliotrope: (GAR-den HEE-lee-oh-TROPE)
    Pronunciation of dictionary term "garden heliotrope"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden valerian, Indian valerian, Mexican valerian, Pacific valerian, valerian, Valeriana officinalis, and Valerianae radix.
  garden valerian: (GAR-den vuh-LEER-ee-un)
    Pronunciation of dictionary term "garden valerian"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, Indian valerian, Mexican valerian, Pacific valerian, valerian, Valeriana officinalis, and Valerianae radix.
  Gardner syndrome: (GARD-ner SIN-drome)
    Pronunciation of dictionary term "Gardner syndrome"
    A rare, inherited disorder in which many polyps (abnormal growths of tissue) form on the inner walls of the colon and rectum. Other signs and symptoms of Gardner syndrome include dental problems and benign (not cancer) growths or tumors in the bone, soft tissue, skin, adrenal glands, stomach, and small intestine. People with Gardner syndrome have a very high risk of developing colorectal cancer at an early age. They are also at risk of developing cancers of the small bowel, stomach, pancreas, thyroid, central nervous system, liver, bile ducts, and adrenal gland. Gardner syndrome is caused by a mutation (change) in a gene called APC. It is a type of familial adenomatous polyposis and a type of autosomal dominant genetic disease.
    More Information
    - Gardner syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6482/gardner-syndrome)
  garlic: (GAR-lik)
    Pronunciation of dictionary term "garlic"
    A European plant that has a bulb used to flavor food. It has also been used in some cultures to treat certain medical conditions including high cholesterol, high blood pressure, infections, and cancer. The scientific name is Allium sativum.
  gastrectomy: (ga-STREK-toh-mee)
    Pronunciation of dictionary term "gastrectomy"
    An operation to remove all or part of the stomach.
  gastric: (GAS-trik)
    Pronunciation of dictionary term "gastric"
    Having to do with the stomach.
  gastric acid: (GAS-trik A-sid)
    Pronunciation of dictionary term "gastric acid"
    Acid that is released into the stomach from glands in the stomach wall. It helps digest food. Gastric acid is made of hydrochloric acid.
  gastric acid secretion test: (GAS-trik A-sid seh-KREE-shun …)
    Pronunciation of dictionary term "gastric acid secretion test"
    A test used to measure the amount of gastric acid made by the stomach. The patient receives an injection of the hormone gastrin or insulin. A tube is put through the nose or throat into the stomach and samples are taken from the stomach and sent to a laboratory for testing. Also called stomach acid stimulation test and stomach acid test.
  gastric adenocarcinoma and proximal polyposis of the stomach: (GAS-trik A-deh-noh-KAR-sih-NOH-muh … PROK-sih-mul PAH-lee-POH-sis … STUH-muk)
    Pronunciation of dictionary term "gastric adenocarcinoma and proximal polyposis of the stomach"
    A rare, inherited disorder in which many polyps (usually hundreds) form in the lining of the upper part of the stomach. Polyps are abnormal growths that may become cancer if they are not removed. People with gastric adenocarcinoma and proximal polyposis of the stomach have an increased risk of developing a type of stomach cancer called intestinal gastric adenocarcinoma. This cancer begins in the mucus-producing cells in the innermost lining of the stomach. Gastric adenocarcinoma and proximal polyposis of the stomach is caused by certain mutations (changes) in a specific part of the APC gene. The age that people with one of these specific mutations in the APC gene develop gastric adenocarcinoma and proximal polyposis of the stomach varies. Also called GAPPS.
    More Information
    - Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-digestive-system-tumors/gastric-adenocarcinoma-and-proxymal-polyposis)
  gastric atrophy: (GAS-trik A-troh-fee)
    Pronunciation of dictionary term "gastric atrophy"
    A condition marked by thinning of the inner lining of the stomach wall and the loss of gland cells in the lining that release substances that help with digestion. It may be caused by infection with the bacterium H. pylori or by certain autoimmune conditions. Gastric atrophy may increase the risk of stomach cancer.
  gastric cancer: (GAS-trik KAN-ser)
    Pronunciation of dictionary term "gastric cancer"
    Cancer that forms in tissues lining the stomach. Also called stomach cancer.
    More Information
    - What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)
    The esophagus and stomach are part of the upper gastrointestinal (digestive) system.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.
  gastric cardia cancer: (GAS-trik KAR-dee-uh KAN-ser)
    Pronunciation of dictionary term "gastric cardia cancer"
    A type of stomach cancer that begins in the mucous-producing cells in the inner lining of the cardia (the part of the stomach that is closest to the esophagus). Food and liquids pass through the cardia to enter the stomach from the esophagus. Risk factors associated with gastric cardia cancer include obesity, smoking tobacco, and gastroesophageal reflux disease (GERD). Most gastric cardia cancers are adenocarcinomas.
    More Information
    - What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)
    The stomach is an organ in the upper abdomen. It can be divided into the cardia and the non-cardia, which includes the fundus, the body, the antrum, and the pylorus. The stomach is part of the digestive system.
    Drawing of the stomach showing the cardia, the fundus, the body, the antrum, and the pylorus.
  gastric feeding tube: (GAS-trik FEE-ding toob)
    Pronunciation of dictionary term "gastric feeding tube"
    A tube that is inserted through the nose, down the throat and esophagus, and into the stomach. It can be used to give drugs, liquids, and liquid food, or used to remove substances from the stomach. Giving food through a gastric feeding tube is a type of enteral nutrition. Also called nasogastric tube and NG tube.
  gastric mucosal hypertrophy: (GAS-trik myoo-KOH-sul hy-PER-troh-fee)
    Pronunciation of dictionary term "gastric mucosal hypertrophy"
    A condition marked by inflammation and ulcers (breaks on the skin or on the surface of an organ) of the mucosa (inner lining) of the stomach and by overgrowth of the cells that make up the mucosa. Symptoms include vomiting, diarrhea, and weight loss. Patients with gastric mucosal hypertrophy may be at a higher risk of stomach cancer. Also called giant hypertrophic gastritis and Ménétrier disease.
  gastric reflux: (GAS-trik REE-flux)
    Pronunciation of dictionary term "gastric reflux"
    The backward flow of stomach acid contents into the esophagus (the tube that connects the mouth to the stomach). Also called esophageal reflux and gastroesophageal reflux.
  gastric scirrhous carcinoma: (GAS-trik SKIR-us KAR-sih-NOH-muh)
    Pronunciation of dictionary term "gastric scirrhous carcinoma"
    A rare type of stomach cancer that begins in the lining of the stomach and spreads to the muscles of the stomach wall. This causes the wall of the stomach to become thick, hard, and rubbery, which leads to trouble digesting food. Also called linitis plastica.
  gastrin: (GAS-trin)
    Pronunciation of dictionary term "gastrin"
    A hormone released from special cells in the lining of the stomach after eating. Gastrin causes the stomach to release an acid that helps digest food.
  gastrinoma: (gas-trih-NOH-muh)
    Pronunciation of dictionary term "gastrinoma"
    A tumor that causes overproduction of gastric acid. It usually begins in the duodenum (first part of the small intestine that connects to the stomach) or the islet cells of the pancreas. Rarely, it may also begin in other organs, including the stomach, liver, jejunum (the middle part of the small intestine), biliary tract (organs and ducts that make and store bile), mesentery, or heart. It is a type of neuroendocrine tumor, and it may metastasize (spread) to the liver and the lymph nodes.
  gastritis: (gas-TRY-tis)
    Pronunciation of dictionary term "gastritis"
    Inflammation of the lining of the stomach.
  gastroenteritis: (GAS-troh-EN-teh-RY-tis)
    Pronunciation of dictionary term "gastroenteritis"
    Inflammation of the lining of the stomach and the intestines. Symptoms may include nausea, vomiting, diarrhea, and abdominal cramps (dull or sharp pains). Gastroenteritis may be caused by infection with bacteria, parasites, or viruses. It may also be caused by food poisoning, allergic reactions, or reactions to certain medicines or foods.
  gastroenterologist: (GAS-troh-EN-teh-RAH-loh-jist)
    Pronunciation of dictionary term "gastroenterologist"
    A doctor who has special training in diagnosing and treating disorders of the digestive system.
  gastroenteropancreatic neuroendocrine tumor: (GAS-troh-EN-teh-roh-PAN-kree-A-tik NOOR-oh-EN-doh-krin TOO-mer)
    Pronunciation of dictionary term "gastroenteropancreatic neuroendocrine tumor"
    A rare type of tumor that can form in the pancreas or in other parts of the gastrointestinal tract, including the stomach, small intestine, colon, rectum, and appendix. Gastroenteropancreatic neuroendocrine tumors usually form in cells that secrete hormones. Some of these tumors make extra amounts of hormones and other substances that may cause signs and symptoms of disease, including a condition called carcinoid syndrome. Gastroenteropancreatic neuroendocrine tumors may be benign (not cancer) or malignant (cancer). They are sometimes called carcinoid tumors or islet cell tumors. Also called GEP-NET.
  gastroesophageal junction: (GAS-troh-ee-SAH-fuh-JEE-ul JUNK-shun)
    Pronunciation of dictionary term "gastroesophageal junction"
    The place where the esophagus is connected to the stomach.
  gastroesophageal reflux: (GAS-troh-ee-SAH-fuh-JEE-ul REE-flux)
    Pronunciation of dictionary term "gastroesophageal reflux"
    The backward flow of stomach acid contents into the esophagus (the tube that connects the mouth to the stomach). Also called esophageal reflux and gastric reflux.
  gastrointestinal: (GAS-troh-in-TES-tih-nul)
    Pronunciation of dictionary term "gastrointestinal"
    Having to do with the gastrointestinal (GI) tract or GI system. The GI tract includes the mouth, throat, esophagus, stomach, small intestine, large intestine, rectum, and anus. Food and liquids travel through the GI tract as they are swallowed, digested, absorbed, and leave the body as feces. The GI system includes these organs as well as the salivary glands, liver, gallbladder, and pancreas, which make digestive juices and enzymes that help the body digest food and liquids. Also called GI.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
  gastrointestinal carcinoid tumor: (GAS-troh-in-TES-tih-nul KAR-sih-noyd TOO-mer)
    Pronunciation of dictionary term "gastrointestinal carcinoid tumor"
    A rare, slow-growing type of cancer that forms in the lining of the gastrointestinal (GI) tract, usually in the small intestine, rectum, or appendix. Sometimes more than one tumor may form. Gastrointestinal carcinoid tumors form in neuroendocrine cells that make hormones that help control digestive juices and the muscles used in moving food through the stomach and intestines. Signs and symptoms of gastrointestinal carcinoid tumors vary by where they are found in the GI tract. In some cases, the hormones made by these tumors may cause a condition called carcinoid syndrome. Symptoms of carcinoid syndrome include facial flushing, diarrhea, wheezing, and a rapid heartbeat. Also called gastrointestinal neuroendocrine tumor.
    More Information
    - Gastrointestinal Neuroendocrine Tumors (https://www.cancer.gov/types/gi-neuroendocrine-tumors)
    Gastrointestinal neuroendocrine tumors form in the lining of the gastrointestinal tract, most often in the small intestine, appendix, or rectum.
    Drawing of the gastrointestinal tract showing the stomach, small intestine (including the duodenum, jejunum, and ileum), appendix, colon, and rectum.
  gastrointestinal neuroendocrine tumor: (GAS-troh-in-TES-tih-nul NOOR-oh-EN-doh-krin TOO-mer)
    Pronunciation of dictionary term "gastrointestinal neuroendocrine tumor"
    A rare, slow-growing type of cancer that forms in the lining of the gastrointestinal (GI) tract, usually in the small intestine, rectum, or appendix. Sometimes more than one tumor may form. Gastrointestinal neuroendocrine tumors form in neuroendocrine cells that make hormones that help control digestive juices and the muscles used in moving food through the stomach and intestines. Signs and symptoms of gastrointestinal neuroendocrine tumors vary by where they are found in the GI tract. In some cases, the hormones made by these tumors may cause a condition called carcinoid syndrome. Symptoms of carcinoid syndrome include facial flushing, diarrhea, wheezing, and a rapid heartbeat. Also called gastrointestinal carcinoid tumor.
    More Information
    - Gastrointestinal Neuroendocrine Tumors (https://www.cancer.gov/types/gi-neuroendocrine-tumors)
    Gastrointestinal neuroendocrine tumors form in the lining of the gastrointestinal tract, most often in the small intestine, appendix, or rectum.
    Drawing of the gastrointestinal tract showing the stomach, small intestine (including the duodenum, jejunum, and ileum), appendix, colon, and rectum.
  gastrointestinal stromal tumor: (GAS-troh-in-TES-tih-nul STROH-mul TOO-mer)
    Pronunciation of dictionary term "gastrointestinal stromal tumor"
    A type of tumor that usually begins in cells in the wall of the gastrointestinal tract. Some gastrointestinal stromal tumors may grow slowly over time, while others can grow and spread very quickly. Also called GIST.
    Gastrointestinal stromal tumors (GISTs) may be found anywhere in or near the gastrointestinal tract.
    Drawing of the gastrointestinal tract showing the esophagus, stomach, colon, small intestine, and rectum.
  gastrointestinal system: (GAS-troh-in-TES-tih-nul SIS-tem)
    Pronunciation of dictionary term "gastrointestinal system"
    The organs that take in food and liquids and break them down into substances that the body can use for energy, growth, and tissue repair. Waste products the body cannot use leave the body through bowel movements. The gastrointestinal system includes the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. It also includes the salivary glands, liver, gallbladder, and pancreas, which make digestive juices and enzymes that help the body digest food and liquids. Also called digestive system.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
    Anatomy of the digestive system. The digestive system is made up of organs that are important for digesting food and liquids. These include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. The digestive system also includes the salivary glands, liver, gallbladder, and pancreas, which make digestive juices and enzymes that help with digestion.
    Anatomy of the digestive system; drawing shows the mouth, salivary glands, pharynx (throat), esophagus, stomach, liver, gallbladder, pancreas, small intestine, large intestine, rectum, and anus.
  gastrointestinal tract: (GAS-troh-in-TES-tih-nul trakt)
    Pronunciation of dictionary term "gastrointestinal tract"
    The organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus. The gastrointestinal tract is part of the digestive system. Also called alimentary tract and digestive tract.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
    Anatomy of the digestive tract. The digestive tract is made up of organs that food and liquids travel through when they are swallowed, digested, absorbed, and leave the body as feces. These organs include the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.
    Anatomy of the digestive tract; drawing shows the mouth, pharynx (throat), esophagus, stomach, small intestine, large intestine, rectum, and anus.
  gastrojejunostomy: (GAS-troh-JEH-joo-NOS-toh-mee)
    Pronunciation of dictionary term "gastrojejunostomy"
    A surgical procedure that connects part of the stomach to the jejunum (the middle part of the small intestine). This allows food and other stomach contents to pass directly from the stomach to the jejunum without passing through the first part of the small intestine called the duodenum. Gastrojejunostomy may be done during surgery to remove part of the stomach that has cancer blocking the opening into the small intestine. It may also be done as part of weight-loss surgery.
  gastroscope: (GAS-troh-SKOPE)
    Pronunciation of dictionary term "gastroscope"
    A thin, tube-like instrument used to examine the inside of the stomach. A gastroscope has a light and a lens for viewing and may have a tool to remove tissue.
  gastrostomy tube: (gas-TROS-toh-mee toob)
    Pronunciation of dictionary term "gastrostomy tube"
    A tube inserted through the wall of the abdomen directly into the stomach. It allows air and fluid to leave the stomach and can be used to give drugs and liquids, including liquid food, to the patient. Giving food through a gastrostomy tube is a type of enteral nutrition. Also called PEG tube and percutaneous endoscopic tube.
  gavage: (guh-VAZH)
    Pronunciation of dictionary term "gavage"
    A way of giving medicines and liquids, including liquid foods, through a small tube placed through the nose or mouth into the stomach or small intestine. Sometimes the tube is placed into the stomach or small intestine through an incision (cut) made on the outside of the abdomen. Gavage may be added to what a person is able to eat and drink, or it may be the only source of nutrition. It is a type of enteral nutrition. Also called tubefeeding.
  Gavreto: (gav-REH-toh)
    Pronunciation of dictionary term "Gavreto"
    A drug used to treat adults with non-small cell lung cancer that has a RET fusion gene and has spread to other parts of the body and adults and children aged 12 years and older with thyroid cancer that has a RET fusion gene, has spread, and needs treatment with systemic therapy. This includes patients whose thyroid cancer did not respond to radioactive iodine. It is also being studied in the treatment of other types of cancer. Gavreto blocks certain proteins made by the RET fusion gene, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called pralsetinib.
    More Information
    - Pralsetinib (https://www.cancer.gov/about-cancer/treatment/drugs/pralsetinib)
  Gazyva: (guh-ZY-vuh)
    Pronunciation of dictionary term "Gazyva"
    A drug used with other drugs to treat certain types of follicular lymphoma and chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. Gazyva binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of leukemia and lymphoma cells. Gazyva may block CD20 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called obinutuzumab.
    More Information
    - Obinutuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/obinutuzumab)
  GBM: A fast-growing type of central nervous system tumor that forms from glial (supportive) tissue of the brain and spinal cord and has cells that look very different from normal cells. GBM usually occurs in adults and affects the brain more often than the spinal cord. Also called glioblastoma, glioblastoma multiforme, and grade IV astrocytoma.
  GBS: A rare condition in which the body’s immune system attacks the nerves located outside the brain and spinal cord. Symptoms of GBS include muscle weakness, muscle pain, numbness, and tingling that often begin in the legs or back and may spread to the arms, upper body, and face. Other symptoms may include problems with vision, speech, swallowing, digestion, and bladder control. GBS can get worse quickly and cause paralysis and other serious or life-threatening problems, such as breathing problems and an abnormal blood pressure or heart rate. Most people with GBS get better over time. GBS is a type of autoimmune disease. Also called Guillain-Barré syndrome.
    More Information
    - Guillain-Barre syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6554/guillain-barr-syndrome)
    - Guillain-Barré syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/guillain-barre-syndrome/)
  GC1008: A substance being studied in the treatment of breast cancer that has spread to other parts of the body. It is also being studied in the treatment of other cancers and conditions. GC1008 binds to a protein called transforming growth factor-beta (TGF-beta), which is found on some cancer cells. GC1008 may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. It is a type of monoclonal antibody and a type of antiangiogenesis agent. Also called anti-TGF-beta monoclonal antibody GC1008 and fresolimumab.
  GCP: An international set of guidelines that helps make sure that the results of a clinical trial are reliable and that the patients are protected. GCP covers the way a clinical trial is designed, conducted, performed, monitored, audited, recorded, analyzed, and reported. Also called Good Clinical Practice.
  GCT: A rare tumor that usually forms in bone, but may also form in cartilage, muscle, fat, blood vessels, or other supportive tissue in the body. Most GCTs occur at the ends of the long bones of the arms and legs, near a joint (such as the knee, wrist, hip, or shoulder). Most are benign (not cancer) but some are malignant (cancer). GCTs usually occur in young and middle-aged adults. Also called giant cell tumor.
  Gd-DTPA: A substance used in magnetic resonance imaging (MRI) to help make clear pictures of the brain, spine, heart, soft tissue of joints, and inside bones. Gd-DTPA is being studied in the diagnosis of cancer. It is a type of contrast agent. Also called gadopentetate dimeglumine and Magnevist.
  GDC-0449: A drug used to treat basal cell carcinoma that has spread to other parts of the body, has come back after surgery, or that cannot be treated with surgery or radiation. It is also being studied in the treatment of other types of cancer. GDC-0449 blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of Hedgehog signaling pathway antagonist. Also called Erivedge and vismodegib.
    More Information
    - Vismodegib (https://www.cancer.gov/about-cancer/treatment/drugs/vismodegib)
  gefitinib: (geh-FIH-tih-nib)
    Pronunciation of dictionary term "gefitinib"
    A drug used to treat non-small cell lung cancer that has spread to other parts of the body and has certain mutations (changes) in the EGFR gene. It is used in patients whose cancer has not already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Gefitinib blocks certain proteins made by the EGFR gene, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Gefitinib is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Iressa and ZD1839.
    More Information
    - Gefitinib (https://www.cancer.gov/about-cancer/treatment/drugs/gefitinib)
  gel electrode: (jel ee-LEK-trode)
    Pronunciation of dictionary term "gel electrode"
    A device that uses a gel to carry an electric current from the skin to a measuring instrument. A sticky patch may hold the gel electrode on the skin so that the electrical activity of the heart or brain can be measured.
  Gelclair: (JEL-klayr)
    Pronunciation of dictionary term "Gelclair"
    A gel used to lessen pain from mouth sores caused by chemotherapy or radiation therapy, oral surgery, braces, or disease. Gelclair is being studied in the treatment of pain caused by mouth sores in children receiving cancer treatment. It forms a thin layer over the surface of the mouth and throat to prevent irritation while eating, drinking, and talking. Also called polyvinylpyrrolidone-sodium hyaluronate gel.
  geldanamycin analog: (gel-DA-nuh-MY-sin A-nuh-log)
    Pronunciation of dictionary term "geldanamycin analog"
    An antineoplastic antibiotic drug that belongs to the family of drugs called ansamycins.
  GEM 231: A drug that may inhibit the growth of malignant tumors.
  GEM640: A substance being studied in the treatment of cancer. GEM640 may kill cancer cells by blocking the production of a protein called XIAP that helps cells live longer. It also makes cancer cells more sensitive to anticancer drugs. It is a type of antisense oligonucleotide, and a type of chemosensitizing agent. Also called AEG35156.
  gemcitabine: (jem-SY-tuh-been)
    Pronunciation of dictionary term "gemcitabine"
    The active ingredient in a drug used alone or with other drugs to treat certain types of breast, non-small cell lung, ovarian, and pancreatic cancers that are advanced or have spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Gemcitabine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
  gemcitabine hydrochloride: (jem-SY-tuh-been HY-droh-KLOR-ide)
    Pronunciation of dictionary term "gemcitabine hydrochloride"
    A drug used alone or with other drugs to treat certain types of breast, non-small cell lung, ovarian, and pancreatic cancers that are advanced or have spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Gemcitabine hydrochloride stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Gemcitabine is the active ingredient of gemcitabine hydrochloride. Also called Gemzar and Infugem.
    More Information
    - Gemcitabine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
  gemcitabine-cisplatin: (jem-SY-tuh-been-sis-PLA-tin)
    Pronunciation of dictionary term "gemcitabine/cisplatin"
    A chemotherapy combination used to treat malignant mesothelioma, advanced non-small cell lung cancer, advanced bladder cancer, advanced cervical cancer, pancreatic cancer, and epithelial ovarian cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs gemcitabine hydrochloride and cisplatin. Also called gemcitabine-cisplatin regimen.
    More Information
    - GEMCITABINE-CISPLATIN (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-CISPLATIN)
  gemcitabine-cisplatin regimen: (jem-SY-tuh-been-sis-PLA-tin REH-jih-men)
    Pronunciation of dictionary term "gemcitabine/cisplatin regimen"
    A chemotherapy combination used to treat malignant mesothelioma, advanced non-small cell lung cancer, advanced bladder cancer, advanced cervical cancer, pancreatic cancer, and epithelial ovarian cancer. It is also being studied in the treatment of other types of cancer. It includes the drugs gemcitabine hydrochloride and cisplatin. Also called gemcitabine-cisplatin.
    More Information
    - GEMCITABINE-CISPLATIN (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-CISPLATIN)
  gemcitabine-erlotinib regimen: (jem-SY-tuh-been-er-LOH-tih-nib REH-jih-men)
    Pronunciation of dictionary term "gemcitabine-erlotinib regimen"
    A chemotherapy combination used for the treatment of locally advanced and metastatic pancreatic cancer. It includes the drugs gemcitabine hydrochloride and erlotinib hydrochloride. Also called gemcitabine-Tarceva regimen.
  gemcitabine-oxaliplatin: (jem-SY-tuh-been-ok-SA-lih-pla-tin)
    Pronunciation of dictionary term "gemcitabine-oxaliplatin"
    A chemotherapy combination used to treat pancreatic cancer and some other types of cancer. It includes the drugs gemcitabine hydrochloride and oxaliplatin. Also called gemcitabine-oxaliplatin regimen and GEMOX.
    More Information
    - GEMCITABINE-OXALIPLATIN (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-OXALIPLATIN)
  gemcitabine-oxaliplatin regimen: (jem-SY-tuh-been-ok-SA-lih-pla-tin REH-jih-men)
    Pronunciation of dictionary term "gemcitabine-oxaliplatin regimen"
    A chemotherapy combination used to treat pancreatic cancer and some other types of cancer. It includes the drugs gemcitabine hydrochloride and oxaliplatin. Also called gemcitabine-oxaliplatin and GEMOX.
    More Information
    - GEMCITABINE-OXALIPLATIN (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-OXALIPLATIN)
  gemcitabine-Tarceva regimen: (jem-SY-tuh-been-tar-SEE-vuh REH-jih-men)
    Pronunciation of dictionary term "gemcitabine-Tarceva regimen"
    A chemotherapy combination used for the treatment of locally advanced and metastatic pancreatic cancer. It includes the drugs gemcitabine hydrochloride and erlotinib hydrochloride. Also called gemcitabine-erlotinib regimen.
  GEMOX: A chemotherapy combination used to treat pancreatic cancer and some other types of cancer. It includes the drugs gemcitabine hydrochloride and oxaliplatin. Also called gemcitabine-oxaliplatin and gemcitabine-oxaliplatin regimen.
    More Information
    - GEMCITABINE-OXALIPLATIN (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-OXALIPLATIN)
  gemtuzumab ozogamicin: (gem-TOO-zoo-mab OH-zoh-ga-MIH-sin)
    Pronunciation of dictionary term "gemtuzumab ozogamicin"
    A drug used alone or with other drugs to treat acute myeloid leukemia that is CD33 positive (expresses the protein CD33). It is used in adults and in children aged 1 month and older whose disease is newly diagnosed. It is also used in adults and in children aged 2 years and older whose disease has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Gemtuzumab ozogamicin contains a monoclonal antibody that binds to CD33, which is found on some leukemia cells. It also contains an anticancer drug, which may help kill cancer cells. Gemtuzumab ozogamicin is a type of antibody-drug conjugate. Also called Mylotarg.
    More Information
    - Gemtuzumab Ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/gemtuzumabozogamicin)
  Gemzar: (JEM-zar)
    Pronunciation of dictionary term "Gemzar"
    A drug used alone or with other drugs to treat certain types of breast, non-small cell lung, ovarian, and pancreatic cancers that are advanced or have spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Gemzar stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called gemcitabine hydrochloride and Infugem.
    More Information
    - Gemcitabine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
  Genasense: (JEH-nuh-sents)
    Pronunciation of dictionary term "Genasense"
    A substance being studied in the treatment of cancer. It may kill cancer cells by blocking the production of a protein that makes cancer cells live longer and by making them more sensitive to anticancer drugs. It is a type of antisense oligodeoxyribonucleotide. Also called augmerosen, bcl-2 antisense oligodeoxynucleotide G3139, and oblimersen sodium.
  gene: (jeen)
    Pronunciation of dictionary term "gene"
    The functional and physical unit of heredity passed from parent to offspring. Genes are pieces of DNA, and most genes contain the information for making a specific protein.
    More Information
    - Gene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Gene)
    - The Genetics of Cancer (https://www.cancer.gov/about-cancer/causes-prevention/genetics)
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  gene amplification: (jeen AM-plih-fih-KAY-shun)
    Pronunciation of dictionary term "gene amplification"
    An increase in the number of copies of a gene. There may also be an increase in the RNA and protein made from that gene. Gene amplification is common in cancer cells, and some amplified genes may cause cancer cells to grow or become resistant to anticancer drugs. Genes may also be amplified in the laboratory for research purposes.
  gene deletion: (jeen deh-LEE-shun)
    Pronunciation of dictionary term "gene deletion"
    The loss of all or a part of a gene. There may also be a change in the RNA and protein made from that gene. Certain gene deletions are found in cancer and in other genetic diseases and abnormalities.
  gene expression: (jeen ek-SPREH-shun)
    Pronunciation of dictionary term "gene expression"
    The process by which a gene gets turned on in a cell to make RNA and proteins. Gene expression may be measured by looking at the RNA, or the protein made from the RNA, or what the protein does in a cell.
  gene expression profile: (jeen ek-SPREH-shun PROH-file)
    Pronunciation of dictionary term "gene expression profile"
    Information about all of the genes in a cell or tissue that are making messenger RNA. Messenger RNA molecules carry the genetic information that a cell needs to make proteins. A gene expression profile may be used to help diagnose a disease or condition, such as cancer. It may also be used to help plan treatment, find out how well treatment is working, make a prognosis, or predict whether cancer will come back or spread to other parts of the body.
  gene signature: (jeen SIG-nuh-cher)
    Pronunciation of dictionary term "gene signature"
    Information about the activity of a specific group of genes in a cell or tissue. In cancer, gene signatures can show how likely certain types of cancer are to grow and spread in the body or how likely they are to recur (come back). A gene signature may be used to help diagnose diseases, such as cancer, plan treatment, find out how well treatment is working, and make a prognosis.
  gene therapy: (jeen THAYR-uh-pee)
    Pronunciation of dictionary term "gene therapy"
    An experimental treatment that adds a new gene or replaces or repairs a mutated (changed) gene inside the body’s cells to help prevent or treat certain diseases, such as cancer. Gene therapy may also be used to train the body’s immune system to recognize and attack cancer cells or to protect healthy cells from the effects of cancer treatment. It is being studied in the treatment of some types of cancer.
    More Information
    - How does gene therapy work? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/therapy/procedures/)
  gene transfer: (jeen TRANZ-fer)
    Pronunciation of dictionary term "gene transfer"
    The insertion of genetic material into a cell.
  gene-modified: (jeen-MAH-dih-FIDE)
    Pronunciation of dictionary term "gene-modified"
    Cells that have been altered to contain different genetic material than they originally contained.
  general anesthesia: (JEH-neh-rul A-nes-THEE-zhuh)
    Pronunciation of dictionary term "general anesthesia"
    A temporary loss of feeling and a complete loss of awareness that feels like a very deep sleep. It is caused by special drugs or other substances called anesthetics. General anesthesia keeps patients from feeling pain during surgery or other procedures.
  general surgery: (JEH-neh-rul SER-juh-ree)
    Pronunciation of dictionary term "general surgery"
    The branch of surgery that covers the main areas of surgical treatment. General surgeons treat diseases of the abdomen, breast, head and neck, blood vessels, and digestive tract. They also manage care of patients who have been injured or who have deformities or other conditions that need surgery.
  generalized anxiety disorder: (JEH-neh-ruh-lized ang-ZY-eh-tee dis-OR-der)
    Pronunciation of dictionary term "generalized anxiety disorder"
    A condition marked by excessive worry and feelings of fear, dread, and uneasiness that last six months or longer. Other symptoms of generalized anxiety disorder include being restless, being tired or irritable, muscle tension, not being able to concentrate or sleep well, shortness of breath, fast heartbeat, sweating, and dizziness. Also called GAD.
  generic: (jeh-NAYR-ik)
    Pronunciation of dictionary term "generic"
    Official nonbrand names by which medicines are known. Generic names usually refer to the chemical name of the drug.
  genetic: (jeh-NEH-tik)
    Pronunciation of dictionary term "genetic"
    Having to do with genes. Most genes are sequences of DNA that contain information for making specific RNA molecules or proteins that perform important functions in a cell. The information in genes is passed down from parent to child. Sometimes, certain changes in genes can affect a person’s risk of disease, such as cancer. These changes may be inherited or they may occur with age or exposure to environmental factors, such as diet, exercise, drugs, and chemicals.
    More Information
    - The Genetics of Cancer (https://www.cancer.gov/about-cancer/causes-prevention/genetics)
  genetic analysis: (jeh-NEH-tik uh-NA-lih-sis)
    Pronunciation of dictionary term "genetic analysis"
    A laboratory method that looks for changes in genes, gene expression, or chromosomes in a person’s cells or tissues. Genetic analysis may be done to look for inherited changes in a person's genes that may be a sign that the person has an increased risk of developing a specific disease or condition or of having a child or other family member with the disease or condition. This type of genetic analysis is called germline testing. Genetic analysis is also done on tumor tissue to look for genetic changes in the cancer cells. These changes occur during a person’s lifetime and are not inherited from a parent. This type of genetic analysis, called somatic testing, is done to learn more about the cancer, plan treatment, or find out how well treatment is working. Also called genetic testing.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  genetic counseling: (jeh-NEH-tik KOWN-suh-ling)
    Pronunciation of dictionary term "genetic counseling"
    A communication process between a specially trained health professional and a person concerned about the genetic risk of disease. The person's family and personal medical history may be discussed, and counseling may lead to genetic testing.
    More Information
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
    - Genetic Counseling (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genetic-Counseling)
  genetic counselor: (jeh-NEH-tik KOWN-seh-ler)
    Pronunciation of dictionary term "genetic counselor"
    A health professional who has special training in medical genetics and counseling. Genetic counselors help patients and families who have, or who may be at risk of, a genetic condition. They help patients find out their chances of having a genetic condition or of having a child or other family member with a genetic condition. They also help patients understand their options for genetic testing, including its risks and benefits. After genetic testing is done, genetic counselors help patients understand their genetic test results, including how the results can affect other family members, and provide counseling and support.
    More Information
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  genetic heterogeneity: (jeh-NEH-tik HEH-teh-roh-jeh-NEE-ih-tee)
    Pronunciation of dictionary term "genetic heterogeneity"
    A term that describes when different gene mutations (changes) cause the same disease or condition. Genetic heterogeneity occurs when a single gene has different mutations (allelic heterogeneity) or when there are mutations in different genes (locus heterogeneity), and in both cases the same disease or condition occurs. For example, tuberous sclerosis (an inherited disorder in which tumors form in the kidneys, brain, eyes, heart, lungs, and skin) is caused by having mutations in a gene on chromosome 9 or chromosome 16.
  genetic infantile agranulocytosis: (jeh-NEH-tik IN-fun-TILE ay-GRAN-yoo-loh-sy-TOH-sis)
    Pronunciation of dictionary term "genetic infantile agranulocytosis"
    An inherited disorder in which there is a lower-than-normal number of neutrophils (a type of white blood cell that is important in fighting infections). Infants with the disorder get infections caused by bacteria, and are at an increased risk of acute myelogenous leukemia (AML) or myelodysplasia (a bone marrow disorder). Also called congenital neutropenia, infantile genetic agranulocytosis, Kostmann disease, Kostmann neutropenia, and Kostmann syndrome.
    More Information
    - Severe congenital neutropenia (MedlinePlus) (https://medlineplus.gov/genetics/condition/severe-congenital-neutropenia/)
    - Severe congenital neutropenia autosomal recessive 3 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/302/kostmann-disease)
  genetic marker: (jeh-NEH-tik MAR-ker)
    Pronunciation of dictionary term "genetic marker"
    A specific sequence of DNA at a known location on a chromosome. There are many genetic markers on each chromosome. Genetic markers and genes that are close to each other on a chromosome are usually inherited (passed from parent to child) together. This may help researchers find a gene near a marker that may cause a certain disease or trait within a family. Examples of genetic markers are single polymorphism nucleotides (SNPs) and microsatellites.
    More Information
    - Genetic Marker (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genetic-Marker)
  genetic marker of susceptibility: (jeh-NEH-tik MAR-ker … suh-SEP-tih-BIH-lih-tee)
    Pronunciation of dictionary term "genetic marker of susceptibility"
    A specific change in a person’s DNA that makes the person more likely to develop certain diseases such as cancer.
  genetic predisposition: (jeh-NEH-tik PREE-dih-spuh-ZIH-shun)
    Pronunciation of dictionary term "genetic predisposition"
    An inherited increase in the risk of developing a disease. Also called genetic susceptibility, hereditary predisposition, and inherited predisposition.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  genetic profile: (jeh-NEH-tik PROH-file)
    Pronunciation of dictionary term "genetic profile"
    Information about changes in specific genes, gene expression, or chromosomes in cells or tissue of a person. These changes may be a sign of a disease or condition, such as cancer. They may also be a sign that a person has an increased risk of developing a specific disease or condition or of having a child or other family member with the disease or condition. A genetic profile may be used to help diagnose disease, plan treatment, or find out how well treatment is working.
  genetic susceptibility: (jeh-NEH-tik suh-SEP-tih-BIH-lih-tee)
    Pronunciation of dictionary term "genetic susceptibility"
    An inherited increase in the risk of developing a disease. Also called genetic predisposition, hereditary predisposition, and inherited predisposition.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  genetic testing: (jeh-NEH-tik TES-ting)
    Pronunciation of dictionary term "genetic testing"
    A laboratory method that looks for changes in genes, gene expression, or chromosomes in a person’s cells or tissues. Genetic testing may be done to look for inherited changes in a person's genes that may be a sign that the person has an increased risk of developing a specific disease or condition or of having a child or other family member with the disease or condition. This type of genetic testing is called germline testing. Genetic testing is also done on tumor tissue to look for genetic changes in the cancer cells. These changes occur during a person’s lifetime and are not inherited from a parent. This type of genetic testing, called somatic testing, is done to learn more about the cancer, plan treatment, or find out how well treatment is working. Also called genetic analysis.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  geneticist: (jeh-NEH-tih-sist)
    Pronunciation of dictionary term "geneticist"
    A scientist who has special training in the study of genes and heredity (the passing of genetic information from parents to their children). A medical geneticist is a doctor who specializes in diagnosing and treating genetic disorders or conditions. Medical geneticists also counsel individuals and families at risk for certain genetic disorders or cancers.
  genetics: (jeh-NEH-tix)
    Pronunciation of dictionary term "genetics"
    The study of genes and heredity. Heredity is the passing of genetic information and traits (such as eye color and an increased chance of getting a certain disease) from parents to offspring.
    More Information
    - The Genetics of Cancer (https://www.cancer.gov/about-cancer/causes-prevention/genetics)
  genistein: (jeh-NIS-teen)
    Pronunciation of dictionary term "genistein"
    An isoflavone found in soy products. Soy isoflavones are being studied to see if they help prevent cancer.
  genital: (JEH-nih-tul)
    Pronunciation of dictionary term "genital"
    Refers to the genitalia (external and internal sex organs and glands).
    More Information
    - Cancers by Body Location/System: Genitourinary (https://www.cancer.gov/types/by-body-location)
  genital wart: (JEH-nih-tul wort)
    Pronunciation of dictionary term "genital wart"
    A raised growth on the surface of the genitals or in or around the anus caused by infection with certain types of human papillomavirus (HPV). HPV can spread by skin-to-skin contact, usually during oral, anal, or genital sex with an infected partner. These warts can also occur on the lips and tongue and in the mouth and throat. Genital warts often appear as small, skin-colored bumps that may be clumped together. They are usually painless and do not cause any symptoms, so a person may not know they have them. However, sometimes they can grow large and cause itching and bleeding. Genital warts do not become cancer, but they may come back after treatment. Also called condyloma acuminatum.
  genitourinary system: (jeh-nih-toh-YOOR-ih-nayr-ee SIS-tem)
    Pronunciation of dictionary term "genitourinary system"
    The parts of the body that play a role in reproduction, getting rid of waste products in the form of urine, or both.
    More Information
    - Cancers by Body Location/System: Genitourinary (https://www.cancer.gov/types/by-body-location)
  genome: (JEE-nome)
    Pronunciation of dictionary term "genome"
    The complete set of DNA (genetic material) in an organism. In people, almost every cell in the body contains a complete copy of the genome. The genome contains all of the information needed for a person to develop and grow. Studying the genome may help researchers understand how different types of cancer form and respond to treatment. This may lead to new ways to diagnose, treat, and prevent cancer.
  genome-wide association study: (JEE-nome ... uh-SOH-see-AY-shun STUH-dee)
    Pronunciation of dictionary term "genome-wide association study"
    A study that compares DNA markers across the genome (the complete genetic material in a person) in people with a disease or trait to people without the disease or trait. These studies may uncover clues to help prevent, diagnose, and treat disease. Also called GWAS.
    More Information
    - Genome-Wide Association Studies (GWAS) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genome-Wide-Association-Studies)
  genomic characterization: (jeh-NOH-mik KAYR-ik-ter-rih-ZAY-shun)
    Pronunciation of dictionary term "genomic characterization"
    A laboratory method that uses a sample of tissue, blood, or other body fluid to learn about all the genes in a person or in a specific cell type, and the way those genes interact with each other and with the environment. Genomic characterization may be done to find out why some people get certain diseases while others do not. Genomic characterization may also be done on tumor tissue to look for mutations or other genetic changes in a tumor's DNA. This may help doctors understand how different types of cancer form and respond to treatment, which may lead to new ways to diagnose, treat, and prevent cancer. Also called genomic profiling.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  genomic instability: (jeh-NOH-mik in-stuh-BIH-lih-tee)
    Pronunciation of dictionary term "genomic instability"
    The increased tendency for DNA mutations (changes) and other genetic changes to occur during cell division. Genomic instability is caused by defects in certain processes that control the way cells divide. It occurs in many types of cancer. These defects may include mutations in certain genes involved in repairing damaged DNA or mistakes that don’t get corrected when DNA is copied in a cell. They may also include defects such as broken, missing, rearranged, or extra chromosomes. Studying genomic instability may help researchers understand how certain diseases, such as cancer, form. This may lead to new ways to diagnose, treat, and prevent disease.
  genomic profiling: (jeh-NOH-mik PROH-fy-ling)
    Pronunciation of dictionary term "genomic profiling"
    A laboratory method that uses a sample of tissue, blood, or other body fluid to learn about all the genes in a person or in a specific cell type, and the way those genes interact with each other and with the environment. Genomic profiling may be done to find out why some people get certain diseases while others do not. Genomic profiling may also be done on tumor tissue to look for mutations or other genetic changes in a tumor's DNA. This may help doctors understand how different types of cancer form and respond to treatment, which may lead to new ways to diagnose, treat, and prevent cancer. Also called genomic characterization.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  genomic sequencing: (jeh-NOH-mik SEE-kwen-sing)
    Pronunciation of dictionary term "genomic sequencing"
    A laboratory method that is used to determine the entire genetic makeup of a specific organism or cell type. This method can be used to find changes in areas of the genome. These changes may help scientists understand how specific diseases, such as cancer, form. Results of genomic sequencing may also be used to diagnose and treat disease.
  genomic testing: (jeh-NOH-mik TES-ting)
    Pronunciation of dictionary term "genomic testing"
    A laboratory method that looks for genetic changes across all the DNA (including the entire set of genes) in a person or in a specific cell type or tissue. Genomic testing is done on samples such as blood or saliva to identify inherited genetic changes that may increase the risk of developing a specific disease or condition, such as cancer. Genomic testing on a tumor sample is done to detect all the genetic changes in the cancer cells. This may help doctors learn more about the cancer, including how quickly it is likely to grow and spread and how well it may respond to certain types of treatment.
  genomics: (jeh-NOH-mix)
    Pronunciation of dictionary term "genomics"
    The study of the complete set of DNA (including all of its genes) in a person or other organism. Almost every cell in a person’s body contains a complete copy of the genome. The genome contains all the information needed for a person to develop and grow. Studying the genome may help researchers understand how genes interact with each other and with the environment and how certain diseases, such as cancer, diabetes, and heart disease, form. This may lead to new ways to diagnose, treat, and prevent disease.
  GEP-NET: A rare type of tumor that can form in the pancreas or in other parts of the gastrointestinal tract, including the stomach, small intestine, colon, rectum, and appendix. GEP-NETs usually form in cells that secrete hormones. Some of these tumors make extra amounts of hormones and other substances that may cause signs and symptoms of disease, including a condition called carcinoid syndrome. GEP-NETs may be benign (not cancer) or malignant (cancer). They are sometimes called carcinoid tumors or islet cell tumors. Also called gastroenteropancreatic neuroendocrine tumor.
  geranium: (jeh-RAY-nee-um)
    Pronunciation of dictionary term "geranium"
    A type of plant that is native to southern Africa and has white, pink, purple, or red flowers and 3- to 5-lobed leaves. An essential oil that smells like roses is taken from the leaves and used in perfume, in mosquito repellants, and in aromatherapy to treat skin problems and to reduce stress. The scientific name is Pelargonium graveolens. Also called pelargonium.
  germ: (jerm)
    Pronunciation of dictionary term "germ"
    A bacterium, virus, or other microorganism that can cause infection and disease.
  germ cell: (jerm sel)
    Pronunciation of dictionary term "germ cell"
    A cell that develops into a reproductive cell, which is an egg in females and a sperm in males.
    More Information
    - Cancers by Body Location/System: Germ Cell (https://www.cancer.gov/types/by-body-location)
  germ cell tumor: (jerm sel TOO-mer)
    Pronunciation of dictionary term "germ cell tumor"
    A type of tumor that begins in the cells that give rise to sperm or eggs. Germ cell tumors can occur almost anywhere in the body and can be either benign or malignant.
    More Information
    - Cancers by Body Location/System: Germ Cell (https://www.cancer.gov/types/by-body-location)
  German chamomile: (JER-mun KA-muh-mile)
    Pronunciation of dictionary term "German chamomile"
    A plant whose daisy-like flowers are used in tea to calm and relax, improve sleep, and help stomach problems. German chamomile has been studied in the prevention of mucositis (mouth sores) caused by chemotherapy and radiation therapy. It has also been used in some cultures to treat skin conditions, mild infections, and other disorders. The scientific name is Matricaria recutita.
  German Commission E: (JER-mun kuh-MIH-shun …)
    Pronunciation of dictionary term "German Commission E"
    The German Federal Institute for Drugs and Medical Devices Commission E. A committee made up of scientists, toxicologists, doctors, and pharmacists formed by the German government in 1978 to find out if herbs sold in Germany are safe and effective. The Commission has published information on the uses, side effects, and drug interactions of more than 300 herbs.
  germfree: (JERM-free)
    Pronunciation of dictionary term "germfree"
    Free of bacteria, viruses, and other microorganisms that can cause infection and disease.
  germicide: (JER-mih-side)
    Pronunciation of dictionary term "germicide"
    Any substance or process that kills germs (bacteria, viruses, and other microorganisms that can cause infection and disease). Also called microbicide.
  germinoma: (JER-mih-NOH-muh)
    Pronunciation of dictionary term "germinoma"
    A type of tumor that begins in germ cells (cells that form sperm or eggs). Germinomas can occur in the ovaries or testicles or other parts of the body, but they occur most often in the central nervous system (brain and spinal cord). This happens when a germ cell travels to the brain during fetal development and later becomes a germ cell tumor. Some germinomas make a hormone called beta-human chorionic gonadotropin (beta-HCG). Germinomas are usually malignant (cancer) but tend to grow and spread slowly and can usually be cured. They are the most common type of central nervous system germ cell tumor. They usually occur in teenagers and young adults.
  germline: (JERM-line)
    Pronunciation of dictionary term "germline"
    The cells that form eggs in females and sperm in males. Germline cells contain the genetic information that is passed down from one generation to the next.
  germline DNA: (JERM-line ...)
    Pronunciation of dictionary term "germline DNA"
    The DNA in germ cells (egg and sperm cells that join to form an embryo). Germline DNA is the source of DNA for all other cells in the body. Also called constitutional DNA.
  germline mutation: (JERM-line myoo-TAY-shun)
    Pronunciation of dictionary term "germline mutation"
    A gene change in a body's reproductive cell (egg or sperm) that becomes incorporated into the DNA of every cell in the body of the offspring. Germline mutations are passed on from parents to offspring. Also called germline variant.
  germline variant: (JERM-line VAYR-ee-unt)
    Pronunciation of dictionary term "germline variant"
    A gene change in a body's reproductive cell (egg or sperm) that becomes incorporated into the DNA of every cell in the body of the offspring. Germline variants are passed on from parents to offspring. Also called germline mutation.
  Gerota's capsule: (gay-ROH-tuz KAP-sul)
    Pronunciation of dictionary term "Gerota's capsule"
    A fibrous envelope of tissue that surrounds the kidney. Also called Gerota's fascia and renal fascia.
  Gerota's fascia: (gay-ROH-tuz FA-shuh)
    Pronunciation of dictionary term "Gerota's fascia"
    A fibrous envelope of tissue that surrounds the kidney. Also called Gerota's capsule and renal fascia.
  Gerson therapy: (GER-sun THAYR-uh-pee)
    Pronunciation of dictionary term "Gerson therapy"
    A diet plan that has been claimed to be a treatment for cancer, migraine, tuberculosis, and other diseases. It is a vegetarian diet that includes eating organic fruits and vegetables and 13 glasses of fresh juice each day. It also includes supplements with iodine, vitamin B-12, potassium, thyroid hormone, liver extract, and pancreatic enzymes. No clinical trial to test Gerson therapy has been reported.
    More Information
    - Gerson Therapy
  gestational carrier: (jeh-STAY-shuh-nul KAYR-ee-er)
    Pronunciation of dictionary term "gestational carrier"
    A woman who carries and gives birth to a baby for a person who is not able to have children. Eggs from an egg donor are fertilized in the laboratory with sperm from a sperm donor to make an embryo. The embryo is implanted in the uterus of the gestational carrier, who carries the baby until birth. The gestational carrier is not genetically related to the baby and is not the biological mother. Also called gestational surrogate.
  gestational surrogate: (jeh-STAY-shuh-nul SER-uh-gut)
    Pronunciation of dictionary term "gestational surrogate"
    A woman who carries and gives birth to a baby for a person who is not able to have children. Eggs from an egg donor are fertilized in the laboratory with sperm from a sperm donor to make an embryo. The embryo is implanted in the uterus of the gestational surrogate, who carries the baby until birth. The gestational surrogate is not genetically related to the baby and is not the biological mother. Also called gestational carrier.
  gestational trophoblastic disease: (jeh-STAY-shuh-nul troh-fuh-BLAS-tik dih-ZEEZ)
    Pronunciation of dictionary term "gestational trophoblastic disease"
    A rare condition in which abnormal cells grow inside the uterus from tissue that forms after conception (the joining of sperm and egg). This tissue is made of trophoblastic cells, which normally surround the fertilized egg in the uterus and help connect the fertilized egg to the wall of the uterus. These cells also form part of the placenta (the organ that passes nutrients from the mother to the fetus). Most gestational trophoblastic diseases are benign (not cancer) and do not spread, but some types are malignant (cancer) and spread to nearby tissues or other parts of the body. The two main types of gestational trophoblastic diseases are hydatidiform mole and choriocarcinoma. Also called gestational trophoblastic tumor, GTD, and GTT.
    More Information
    - Gestational Trophoblastic Disease (https://www.cancer.gov/types/gestational-trophoblastic)
  gestational trophoblastic tumor: (jeh-STAY-shuh-nul troh-fuh-BLAS-tik TOO-mer)
    Pronunciation of dictionary term "gestational trophoblastic tumor"
    A rare condition in which abnormal cells grow inside the uterus from tissue that forms after conception (the joining of sperm and egg). This tissue is made of trophoblastic cells, which normally surround the fertilized egg in the uterus and help connect the fertilized egg to the wall of the uterus. These cells also form part of the placenta (the organ that passes nutrients from the mother to the fetus). Most gestational trophoblastic tumors are benign (not cancer) and do not spread, but some types are malignant (cancer) and spread to nearby tissues or other parts of the body. The two main types of gestational trophoblastic tumors are hydatidiform mole and choriocarcinoma. Also called gestational trophoblastic disease, GTD, and GTT.
    More Information
    - Gestational Trophoblastic Disease (https://www.cancer.gov/types/gestational-trophoblastic)
  gFOBT: A test that checks for occult (hidden) blood in the stool. Small samples of stool are placed on special cards coated with a chemical substance called guaiac and sent to a doctor or laboratory for testing. A testing solution is put on the cards and the guaiac causes the stool sample to change color. If there is blood in the stool, the color changes very quickly. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called guaiac fecal occult blood test, guaiac smear test, and stool guaiac test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A guaiac fecal occult blood test (FOBT) checks for occult (hidden) blood in the stool. Small samples of stool are placed on a special card and returned to a doctor or laboratory for testing.
    Guaiac fecal occult blood test (FOBT) kit; shows card, applicator, and return envelope.
  GG745: A drug used to treat symptoms of an enlarged prostate gland. It is being studied in the treatment of male hair loss and prostate cancer. GG745 blocks enzymes the body needs to make male sex hormones. It is a type of 5-alpha reductase inhibitor. Also called Avodart and dutasteride.
    More Information
    - Prostate Cancer Prevention
  GI: Having to do with the gastrointestinal (GI) tract or GI system. The GI tract includes the mouth, throat, esophagus, stomach, small intestine, large intestine, rectum, and anus. Food and liquids travel through the GI tract as they are swallowed, digested, absorbed, and leave the body as feces. The GI system includes these organs as well as the salivary glands, liver, gallbladder, and pancreas, which make digestive juices and enzymes that help the body digest food and liquids. Also called gastrointestinal.
    More Information
    - Cancers by Body Location/System: Digestive/Gastrointestinal (https://www.cancer.gov/types/by-body-location)
  GI14721: An antitumor drug that belongs to the family of drugs called topoisomerase inhibitors. It is a camptothecin analog.
  giant cell fibroblastoma: (JY-unt sel FY-broh-blas-TOH-muh)
    Pronunciation of dictionary term "giant cell fibroblastoma"
    A rare type of soft tissue tumor marked by painless nodules in the dermis (the inner layer of the two main layers of tissue that make up the skin) and subcutaneous (beneath the skin) tissue. These tumors may come back after surgery, but they do not spread to other parts of the body. They occur mostly in boys and are related to dermatofibrosarcoma protuberans.
  giant cell tumor: (JY-unt sel TOO-mer)
    Pronunciation of dictionary term "giant cell tumor"
    A rare tumor that usually forms in bone, but may also form in cartilage, muscle, fat, blood vessels, or other supportive tissue in the body. Most giant cell tumors occur at the ends of the long bones of the arms and legs, near a joint (such as the knee, wrist, hip, or shoulder). Most are benign (not cancer) but some are malignant (cancer). Giant cell tumors usually occur in young and middle-aged adults. Also called GCT.
  giant hypertrophic gastritis: (JY-unt hy-per-TROH-fik gas-TRY-tis)
    Pronunciation of dictionary term "giant hypertrophic gastritis"
    A condition marked by inflammation and ulcers (breaks on the skin or on the surface of an organ) of the mucosa (inner lining) of the stomach and by overgrowth of the cells that make up the mucosa. Symptoms include vomiting, diarrhea, and weight loss. Patients with giant hypertrophic gastritis may be at a higher risk of stomach cancer. Also called gastric mucosal hypertrophy and Ménétrier disease.
  giant lymph node hyperplasia: (JY-unt limf node HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "giant lymph node hyperplasia"
    A rare disorder in which benign (not cancer) growths form in lymph node tissue. There are two main ways that giant lymph node hyperplasia occurs: localized (unicentric) and multicentric. Unicentric giant lymph node hyperplasia affects only one group of lymph nodes in one part of the body, usually in the chest or abdomen. It may not cause symptoms. Multicentric giant lymph node hyperplasia affects many groups of lymph nodes and lymphoid tissue all through the body. It can weaken the immune system and cause problems such as infection, fever, weight loss, fatigue, night sweats, nerve damage, and anemia. People with giant lymph node hyperplasia have an increased risk of lymphoma. Also called angiofollicular lymph node hyperplasia and Castleman disease.
  gigantism: (jy-GAN-tih-zum)
    Pronunciation of dictionary term "gigantism"
    A condition in which the whole body or any of its parts grow much larger than normal.
  Gilotrif: (JEE-loh-trif)
    Pronunciation of dictionary term "Gilotrif"
    A drug used to treat certain types of non-small cell lung cancer that have spread to other parts of the body. It is used in patients whose cancer has not already been treated and has certain mutations (changes) in the EGFR gene or whose cancer got worse after treatment with platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Gilotrif blocks certain proteins made by the EGFR gene, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Gilotrif is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called afatinib dimaleate.
    More Information
    - Afatinib Dimaleate (https://www.cancer.gov/about-cancer/treatment/drugs/afatinibdimaleate)
  gilteritinib fumarate: (GIL-teh-RIH-tih-nib FYOO-muh-rayt)
    Pronunciation of dictionary term "gilteritinib fumarate"
    A drug used to treat adults with acute myeloid leukemia that came back or did not get better with other treatment and has a mutation (change) in the FLT3 gene. Gilteritinib fumarate blocks certain proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Xospata.
    More Information
    - Gilteritinib Fumarate (https://www.cancer.gov/about-cancer/treatment/drugs/gilteritinibfumarate)
  gimatecan: (jih-muh-TEE-kan)
    Pronunciation of dictionary term "gimatecan"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called topoisomerase inhibitors. Also called ST1481.
  ginger: (JIN-jer)
    Pronunciation of dictionary term "ginger"
    An herb with a root that has been used in cooking, and by some cultures to treat nausea, vomiting, and certain other medical conditions. It is being studied in the treatment of nausea and vomiting caused by cancer chemotherapy. The scientific name is Zingiber officianale.
  gingiva: (JIN-jih-vuh)
    Pronunciation of dictionary term "gingiva"
    The tissue of the upper and lower jaws that surrounds the base of the teeth. Also called gums.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  ginkgo: (GING-koh)
    Pronunciation of dictionary term "ginkgo"
    A tree native to China. Substances taken from the leaves and seeds have been used in some cultures to treat certain medical problems. Ginkgo has been studied in the prevention and treatment of Alzheimer disease, dementia, certain blood vessel diseases, and memory loss. It may cause bleeding or high blood pressure when used with certain drugs. Also called ginkgo biloba and maidenhair tree.
  ginkgo biloba: (GING-koh by-LOH-buh)
    Pronunciation of dictionary term "ginkgo biloba"
    A tree native to China. Substances taken from the leaves and seeds have been used in some cultures to treat certain medical problems. Ginkgo biloba has been studied in the prevention and treatment of Alzheimer disease, dementia, certain blood vessel diseases, and memory loss. It may cause bleeding or high blood pressure when used with certain drugs. Also called ginkgo and maidenhair tree.
  ginseng: (JIN-seng)
    Pronunciation of dictionary term "ginseng"
    An herb with a root that has been used in some cultures to treat certain medical problems. It may have anticancer effects.
  GIST: A type of tumor that usually begins in cells in the wall of the gastrointestinal tract. Some GISTs may grow slowly over time, while others can grow and spread very quickly. Also called gastrointestinal stromal tumor.
    Gastrointestinal stromal tumors (GISTs) may be found anywhere in or near the gastrointestinal tract.
    Drawing of the gastrointestinal tract showing the esophagus, stomach, colon, small intestine, and rectum.
  gland: (gland)
    Pronunciation of dictionary term "gland"
    An organ that makes one or more substances, such as hormones, digestive juices, sweat, tears, saliva, or milk. Endocrine glands release the substances directly into the bloodstream. Exocrine glands release the substances into a duct or opening to the inside or outside of the body.
  gland of Lieberkuhn: (... LEE-ber-keen)
    Pronunciation of dictionary term "gland of Lieberkuhn"
    Tube-like gland found in the lining of the colon and rectum. Glands of Lieberkuhn renew the lining of the intestine and make mucus. Also called colon crypt.
  glandular cell of the cervix: (GLAN-juh-ler sel … SER-vix)
    Pronunciation of dictionary term "glandular cell of the cervix"
    A type of cell that makes mucus and is found in tissue that lines the inner part of the cervix. Abnormal glandular cells may be found in Pap tests and may be a sign of cancer or other serious condition.
  glandular epithelium: (GLAN-juh-ler eh-pih-THEE-lee-um)
    Pronunciation of dictionary term "glandular epithelium"
    A type of tissue that lines certain internal organs and makes and releases substances in the body, such as mucous, digestive juices, and other fluids. Glandular epithelium is commonly found in the breast, lung, stomach, colon, pancreas, prostate, uterus, and cervix. Also called glandular tissue.
  glandular tissue: (GLAN-juh-ler TIH-shoo)
    Pronunciation of dictionary term "glandular tissue"
    A type of tissue that lines certain internal organs and makes and releases substances in the body, such as mucous, digestive juices, and other fluids. Glandular tissue is commonly found in the breast, lung, stomach, colon, pancreas, prostate, uterus, and cervix. Also called glandular epithelium.
  glans penis: (glanz PEE-nis)
    Pronunciation of dictionary term "glans penis"
    The rounded, gland-like head of the penis.
  glasdegib maleate: (glas-DEH-gib MAY-lee-AYT)
    Pronunciation of dictionary term "glasdegib maleate"
    A drug used with low-dose cytarabine to treat acute myeloid leukemia that is newly diagnosed. It is used in patients who are 75 years and older or in patients who cannot be treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Glasdegib maleate blocks a type of protein involved in cell growth and repair and may block the growth of cancer cells. It is a type of hedgehog signaling pathway antagonist. Also called Daurismo.
    More Information
    - Glasdegib Maleate (https://www.cancer.gov/about-cancer/treatment/drugs/glasdegibmaleate)
  glaucoma: (glaw-KOH-muh)
    Pronunciation of dictionary term "glaucoma"
    A condition in which there is a build-up of fluid in the eye, which presses on the retina and the optic nerve. The retina is the layer of nerve tissue inside the eye that senses light and sends images along the optic nerve to the brain. Glaucoma can damage the optic nerve and cause loss of vision or blindness.
  Gleason score: (GLEE-sun...)
    Pronunciation of dictionary term "Gleason score"
    A way of describing prostate cancer based on how abnormal the cancer cells in a biopsy sample look under a microscope and how quickly they are likely to grow and spread. Most prostate cancers contain cells that are different grades. The Gleason score is calculated by adding together the two grades of cancer cells that make up the largest areas of the biopsied tissue sample. The Gleason score usually ranges from 6 to 10. The lower the Gleason score, the more the cancer cells look like normal cells and are likely to grow and spread slowly. The Gleason score is used to help plan treatment and determine prognosis (outcome).
  Gleevec: (GLEE-vek)
    Pronunciation of dictionary term "Gleevec"
    A drug used to treat certain types of leukemia and other blood cancers, gastrointestinal stromal tumors, skin tumors called dermatofibrosarcoma protuberans, and a certain type of a rare condition called systemic mastocytosis. It is also being studied in the treatment of other conditions and types of cancer. Gleevec blocks certain proteins made by the BCR::ABL1, PDGFR, or c-KIT oncogene, which may help keep cancer cells from growing and may kill them. Gleevec is a type of tyrosine kinase inhibitor. Also called imatinib mesylate, Imkeldi, and STI571.
    More Information
    - Imatinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/imatinibmesylate)
  Gleolan: (GLEE-oh-lan)
    Pronunciation of dictionary term "Gleolan"
    A drug that contains the active ingredient aminolevulinic acid hydrochloride and is used during surgery to help find certain types of brain tumors. When Gleolan is taken up by cancer cells and then exposed to certain types of light, it becomes active and may make the cancer cells easier to see. Gleolan is a type of imaging agent and a type of photosensitizing agent.
  Gleostine: (GLEE-oh-steen)
    Pronunciation of dictionary term "Gleostine"
    A drug used to treat brain tumors that have already been treated with surgery or radiation therapy and Hodgkin lymphoma that got worse after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Gleostine damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea. Also called CCNU and lomustine.
    More Information
    - Lomustine (https://www.cancer.gov/about-cancer/treatment/drugs/lomustine)
  Gliadel Wafer: (GLY-uh-del WAY-fer)
    Pronunciation of dictionary term "Gliadel Wafer"
    A drug used with surgery and radiation therapy to treat high-grade glioma that has not already been treated and with surgery to treat glioblastoma multiforme that has recurred (come back). Gliadel Wafer is a form of carmustine contained in a wafer. The wafer has a coating that dissolves slowly and releases carmustine directly into the area where the brain tumor was removed. This form may have fewer side effects and work better than other forms of carmustine. Gliadel Wafer is a type of alkylating agent and a type of nitrosourea. Also called carmustine implant and polifeprosan 20 carmustine implant.
    More Information
    - Carmustine Implant (https://www.cancer.gov/about-cancer/treatment/drugs/carmustineimplant)
  glial cell: (GLEE-ul sel)
    Pronunciation of dictionary term "glial cell"
    Any of the cells that hold nerve cells in place and help them work the way they should. The types of glial cells include oligodendrocytes, astrocytes, microglia, and ependymal cells. Also called neuroglia.
  glial tumor: (GLEE-ul TOO-mer)
    Pronunciation of dictionary term "glial tumor"
    A group of tumors that form in glial cells in the brain and spinal cord. Glial cells support and protect the nerve cells in the central nervous system and help them work the way they should. Glial tumors can form anywhere in the brain or spinal cord and may be benign (not cancer) or malignant (cancer). They can also be low grade or high grade, determined by how abnormal the tumor cells look under a microscope and how quickly the tumor is likely to grow, spread, and come back after treatment. The three main types of glial tumors are astrocytomas, oligodendrogliomas, and ependymomas. They can occur in both adults and children. Also called glioma.
    More Information
    - Brain Tumors (https://www.cancer.gov/types/brain)
    Anatomy of the brain showing the cerebrum, ventricles (with cerebrospinal fluid shown in blue), cerebellum, brain stem (pons and medulla), and other parts of the brain.
    Anatomy of the brain; two-panel drawing showing the cerebrum, ventricles (fluid-filled spaces), cerebellum, brain stem (pons and medulla), and spinal cord. Also shown are the meninges and skull (left panel) and the choroid plexus, hypothalamus, pineal gland, pituitary gland, and optic nerve (right panel).
  glioblastoma: (GLEE-oh-blas-TOH-muh)
    Pronunciation of dictionary term "glioblastoma"
    A fast-growing type of central nervous system tumor that forms from glial (supportive) tissue of the brain and spinal cord and has cells that look very different from normal cells. Glioblastoma usually occurs in adults and affects the brain more often than the spinal cord. Also called GBM, glioblastoma multiforme, and grade IV astrocytoma.
  glioblastoma multiforme: (GLEE-oh-blas-TOH-muh MUL-tih-form)
    Pronunciation of dictionary term "glioblastoma multiforme"
    A fast-growing type of central nervous system tumor that forms from glial (supportive) tissue of the brain and spinal cord and has cells that look very different from normal cells. Glioblastoma multiforme usually occurs in adults and affects the brain more often than the spinal cord. Also called GBM, glioblastoma, and grade IV astrocytoma.
  glioma: (glee-OH-muh)
    Pronunciation of dictionary term "glioma"
    A group of tumors that form in glial cells in the brain and spinal cord. Glial cells support and protect the nerve cells in the central nervous system and help them work the way they should. Gliomas can form anywhere in the brain or spinal cord and may be benign (not cancer) or malignant (cancer). They can also be low grade or high grade, determined by how abnormal the tumor cells look under a microscope and how quickly the tumor is likely to grow, spread, and come back after treatment. The three main types of gliomas are astrocytomas, oligodendrogliomas, and ependymomas. They can occur in both adults and children. Also called glial tumor.
    More Information
    - Brain Tumors (https://www.cancer.gov/types/brain)
    Anatomy of the brain showing the cerebrum, ventricles (with cerebrospinal fluid shown in blue), cerebellum, brain stem (pons and medulla), and other parts of the brain.
    Anatomy of the brain; two-panel drawing showing the cerebrum, ventricles (fluid-filled spaces), cerebellum, brain stem (pons and medulla), and spinal cord. Also shown are the meninges and skull (left panel) and the choroid plexus, hypothalamus, pineal gland, pituitary gland, and optic nerve (right panel).
  glioneuronal tumor: (GLEE-oh-noor-OH-nul TOO-mer)
    Pronunciation of dictionary term "glioneuronal tumor"
    One of a group of rare tumors that contain a mixture of nerve cells and glial cells (supporting cells) of the brain or spinal cord. There are many different types of glioneuronal tumors, and they can occur anywhere in the brain or spinal cord. Most glioneuronal tumors are not cancer and tend to grow slowly. However, they can grow and press on nearby brain tissue, which can cause seizures, a buildup of fluid and increased pressure in the brain, and other problems. Glioneuronal tumors can occur at any age but are more common in children and young adults. Also called mixed neuronal-glial tumor.
  gliosarcoma: (GLEE-oh-sar-KOH-muh)
    Pronunciation of dictionary term "gliosarcoma"
    A type of glioma (cancer of the brain that comes from glial, or supportive, cells).
  glofitamab: (gloh-FIH-tah-mab)
    Pronunciation of dictionary term "glofitamab"
    A drug used to treat adults with certain types of diffuse large B-cell lymphoma or large B-cell lymphoma that came back or did not get better after treatment with at least two other systemic therapies. It is also being studied in the treatment of other types of cancer. Glofitamab binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called CD20, which is found on B cells (another type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Glofitamab is a type of bispecific monoclonal antibody. Also called Columvi.
    More Information
    - Glofitamab-gxbm (https://www.cancer.gov/about-cancer/treatment/drugs/glofitamab-gxbm)
  glomerulonephritis: (gloh-MAYR-yoo-loh-neh-FRY-tis)
    Pronunciation of dictionary term "glomerulonephritis"
    A condition in which the tissues in the kidney become inflamed and have problems filtering waste from the blood. Glomerulonephritis may be caused by infection, inflammatory conditions (such as lupus), certain genetic conditions, and other diseases or conditions. It may also be caused by taking certain medicines or being exposed to certain chemicals. Signs and symptoms include blood and protein in the urine; high blood pressure; swelling of the face, hands, feet, and legs; fatigue; and anemia. If not treated or controlled, glomerulonephritis may lead to kidney damage and kidney failure. Also called nephritis.
  glossectomy: (glah-SEK-toh-mee)
    Pronunciation of dictionary term "glossectomy"
    Surgical removal of all or part of the tongue.
  glottis: (GLAH-tis)
    Pronunciation of dictionary term "glottis"
    The middle part of the larynx; the area where the vocal cords are located.
    Anatomy of the larynx. The three parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.
    Anatomy of the larynx; drawing shows the epiglottis, supraglottis, glottis, subglottis, and vocal cords. Also shown are the tongue, trachea, and esophagus.
  glucagon: (GLOO-kuh-gon)
    Pronunciation of dictionary term "glucagon"
    A hormone produced by the pancreas that increases the level of glucose (sugar) in the blood.
  glucagonoma: (GLOO-kuh-guh-NOH-muh)
    Pronunciation of dictionary term "glucagonoma"
    A rare pancreatic tumor that produces a hormone called glucagon. Glucagonomas can produce symptoms similar to diabetes.
  glucarpidase: (gloo-KAR-pih-dayz)
    Pronunciation of dictionary term "glucarpidase"
    A drug used to treat toxic levels of the anticancer drug methotrexate in the blood of adults and children with kidney problems. Glucarpidase is a bacterial enzyme that helps break down and remove methotrexate from the body. It may also help certain drugs kill cancer cells. Glucarpidase is a type of chemoprotective agent and a type of prodrug activator. Also called carboxypeptidase-G2 and Voraxaze.
    More Information
    - Glucarpidase (https://www.cancer.gov/about-cancer/treatment/drugs/glucarpidase)
  glucocorticoid: (GLOO-koh-KOR-tih-koyd)
    Pronunciation of dictionary term "glucocorticoid"
    A compound that belongs to the family of compounds called corticosteroids (steroids). Glucocorticoids affect metabolism and have anti-inflammatory and immunosuppressive effects. They may be naturally produced (hormones) or synthetic (drugs).
  gluconeogenesis: (GLOO-koh-NEE-oh-JEH-neh-sis)
    Pronunciation of dictionary term "gluconeogenesis"
    The process of making glucose (sugar) from its own breakdown products or from the breakdown products of lipids (fats) or proteins. Gluconeogenesis occurs mainly in cells of the liver or kidney.
  Glucophage: (GLOO-koh-fayj)
    Pronunciation of dictionary term "Glucophage"
    A drug used to treat diabetes mellitus (a condition in which the body cannot control the level of sugar in the blood). It is also being studied in the treatment of cancer. Glucophage decreases the amount of glucose (a type of sugar) released into the bloodstream from the liver and increases the body’s use of the glucose. It is a type of antidiabetic agent. Also called metformin hydrochloride.
  glucose: (GLOO-kose)
    Pronunciation of dictionary term "glucose"
    A type of sugar; the chief source of energy for living organisms.
  glucose-6-phosphate dehydrogenase deficiency: (GLOO-kose-6-FOS-fayt dee-hy-DRAH-jeh-nays deh-FIH-shun-see)
    Pronunciation of dictionary term "glucose-6-phosphate dehydrogenase deficiency"
    An inherited disorder in which a person doesn’t have enough of an enzyme called G6PD that helps red blood cells work the way they should. In glucose-6-phosphate dehydrogenase deficiency, the red blood cells break down when the body is exposed to infection, severe stress, or certain drugs, chemicals, or foods. This may lead to a condition called hemolytic anemia. This disorder is most common in African-American men and in men of Middle Eastern or Mediterranean descent. Also called G6PD deficiency.
    More Information
    - Glucose-6-phosphate dehydrogenase deficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6520/glucose-6-phosphate-dehydrogenase-deficiency)
    - Glucose-6-phosphate dehydrogenase deficiency (MedlinePlus) (https://medlineplus.gov/genetics/condition/glucose-6-phosphate-dehydrogenase-deficiency/)
  glucuronic acid: (GLOO-kyoo-RAH-nik A-sid)
    Pronunciation of dictionary term "glucuronic acid"
    A form of a type of sugar called glucose that helps remove harmful substances from the body. Glucuronic acid and the harmful substance combine in the liver and then are passed in the urine. Glucuronic acid is also found in other substances in the body, such as cartilage and synovial fluid (fluid found in the joints).
  glufosfamide: (GLOO-FOS-fuh-mide)
    Pronunciation of dictionary term "glufosfamide"
    An anticancer drug that belongs to the family of drugs called alkylating agents.
  glutamic acid: (gloo-TA-mik A-sid)
    Pronunciation of dictionary term "glutamic acid"
    One of twenty amino acids (molecules that join together to form proteins). Glutamic acid may help nerve cells send and receive information from other cells. It is being studied for its ability to decrease or prevent nerve damage caused by anticancer drugs. Also called L-glutamic acid.
  glutamine: (GLOO-tuh-meen)
    Pronunciation of dictionary term "glutamine"
    An amino acid used in nutrition therapy. It is also being studied for the treatment of diarrhea caused by radiation therapy to the pelvis.
  glutathione: (GLOO-tuh-THY-one)
    Pronunciation of dictionary term "glutathione"
    A substance found in plant and animal tissues that has many functions in a cell. These include activating certain enzymes and destroying toxic compounds and chemicals that contain oxygen.
  glutathione S-transferase: (GLOO-tuh-THY-one ... TRANZ-feh-rays)
    Pronunciation of dictionary term "glutathione S-transferase"
    A family of enzymes involved in metabolism and in making toxic compounds less harmful to the body.
  glycan: (GLY-kan)
    Pronunciation of dictionary term "glycan"
    A large carbohydrate molecule. It contains many small sugar molecules that are joined chemically. Also called polysaccharide.
  glycan analysis: (GLY-kan uh-NA-lih-sis)
    Pronunciation of dictionary term "glycan analysis"
    A study of the types of carbohydrate (sugar) molecules attached to proteins in cells. Proteins with carbohydrate molecules are called glycoproteins. Glycan analysis is being studied to find out if glycoproteins on cancer cells may be used as biomarkers for cancer.
  glycemia: (gly-SEE-mee-uh)
    Pronunciation of dictionary term "glycemia"
    Glucose (a type of sugar) found in the blood. Also called blood sugar.
  glycemic index: (gly-SEE-mik IN-dex)
    Pronunciation of dictionary term "glycemic index"
    A measure of the increase in the level of blood glucose (a type of sugar) caused by eating a specific carbohydrate (food that contains sugar) compared with eating a standard amount of glucose. Foods with a high glycemic index release glucose quickly and cause a rapid rise in blood glucose. Foods with a low glycemic index release glucose slowly into the blood. A relationship between the glycemic index and recurrent colorectal cancer is being studied.
  glycinamide ribonucleotide formyltransferase inhibitor: (gly-SIH-nuh-mide RY-boh-NOO-klee-oh-tide FOR-mil-TRANZ-feh-rays in-HIH-bih-ter)
    Pronunciation of dictionary term "glycinamide ribonucleotide formyltransferase inhibitor"
    A drug that blocks DNA synthesis and may prevent tumor growth. It is being studied as a treatment for cancer.
  Glycine max: (GLY-seen ...)
    Pronunciation of dictionary term "Glycine max"
    A product from a plant of Asian origin that produces beans used in many food products. Glycine max contains isoflavones (estrogen-like substances) that are being studied for the prevention of cancer, hot flashes that occur with menopause, and osteoporosis (loss of bone density). Glycine max in the diet may lower cholesterol levels and reduce the risk of heart disease. Also called soy, soya, and soybean.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  glycogen storage disease: (GLY-koh-jen STOR-ij dih-ZEEZ)
    Pronunciation of dictionary term "glycogen storage disease"
    A type of inherited disorder in which there are problems with how a form of glucose (sugar) called glycogen is stored and used in the body. Certain enzymes that help make or break down glycogen are missing or do not work the way they should. This causes abnormal amounts or types of glycogen in the tissues, especially in the liver and in muscle tissue. There are many types of glycogen storage disease, which can cause problems in different parts of the body, including the liver, muscles, kidneys, and heart. Also called GSD.
  glycolic acid: (gly-KAH-lik A-sid)
    Pronunciation of dictionary term "glycolic acid"
    A substance found in some fruits, sugar beets, and sugar cane. It is used in skin care products to reduce wrinkles and soften the skin. It is a type of alpha hydroxyl acid.
  glycolysis: (gly-KAH-lih-sis)
    Pronunciation of dictionary term "glycolysis"
    A process in which glucose (sugar) is partially broken down by cells in enzyme reactions that do not need oxygen. Glycolysis is one method that cells use to produce energy. When glycolysis is linked with other enzyme reactions that use oxygen, more complete breakdown of glucose is possible and more energy is produced.
  glycopeptide: (gly-koh-PEP-tide)
    Pronunciation of dictionary term "glycopeptide"
    A short chain of amino acids (the building blocks of proteins) that has sugar molecules attached to it. Some glycopeptides have been studied for their ability to stimulate the immune system.
  glycoprotein: (gly-koh-PROH-teen)
    Pronunciation of dictionary term "glycoprotein"
    A protein that has sugar molecules attached to it.
  glycoprotein 100: (gly-koh-PROH-teen …)
    Pronunciation of dictionary term "glycoprotein 100"
    gp100. A tumor-specific antigen used in the development of cancer vaccines. Also called gp100.
  glycosaminoglycan: (GLY-koh-suh-MEE-noh-GLY-kan)
    Pronunciation of dictionary term "glycosaminoglycan"
    A type of long, unbranched polysaccharide molecule. Glycosaminoglycans are major structural components of cartilage and are also found in the cornea of the eye.
  GM-CSF: A substance that helps make more white blood cells, especially granulocytes, macrophages, and cells that become platelets. It is a cytokine that is a type of hematopoietic (blood-forming) agent. Also called granulocyte-macrophage colony-stimulating factor and sargramostim.
  GM-CSF-secreting breast tumor vaccine: (… seh-KREE-ting brest TOO-mer vak-SEEN)
    Pronunciation of dictionary term "GM-CSF-secreting breast tumor vaccine"
    A vaccine that is being studied as a way to help the body’s immune system kill breast cancer cells. To make the vaccine, the GM-CSF gene is put into breast cancer cells in the laboratory. The cells are then treated with radiation to stop them from growing and injected into the same or a different patient. The GM-CSF protein made by the changed breast cancer cells may help the immune system kill breast cancer cells in the body.
  GM2-KLH vaccine: (... vak-SEEN)
    Pronunciation of dictionary term "GM2-KLH vaccine"
    A substance used to stimulate the production of antibodies that fight certain cancer cells.
  GnRH: A hormone made by a part of the brain called the hypothalamus. GnRH causes the pituitary gland in the brain to make and secrete the hormones luteinizing hormone (LH) and follicle-stimulating hormone (FSH). In men, these hormones cause the testicles to make testosterone. In women, they cause the ovaries to make estrogen and progesterone. Also called gonadotropin-releasing hormone, LH-RH, LHRH, and luteinizing hormone-releasing hormone.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  GnRH agonist: (… A-guh-nist)
    Pronunciation of dictionary term "GnRH agonist"
    A substance that keeps the testicles and ovaries from making sex hormones by blocking other hormones that are needed to make them. In men, GnRH agonists cause the testicles to stop making testosterone. In women, they cause the ovaries to stop making estrogen and progesterone. Some GnRH agonists are used to treat prostate cancer. Also called GnRHa, gonadotropin-releasing hormone agonist, LHRH agonist, and luteinizing hormone-releasing hormone agonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  GnRH antagonist: (… an-TA-guh-nist)
    Pronunciation of dictionary term "GnRH antagonist"
    A substance that blocks the pituitary gland from making hormones called follicle-stimulating hormone (FSH) and luteinizing hormone (LH). In men, this causes the testicles to stop making testosterone. In women, this causes the ovaries to stop making estrogen and progesterone. Some GnRH antagonists are used to treat advanced prostate cancer. They are also used to treat certain gynecologic conditions and are being studied in the treatment of hormone-sensitive breast cancer. Also called gonadotropin-releasing hormone antagonist, LHRH antagonist, and luteinizing hormone-releasing hormone antagonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  GnRHa: A substance that keeps the testicles and ovaries from making sex hormones by blocking other hormones that are needed to make them. In men, GnRHas cause the testicles to stop making testosterone. In women, they cause the ovaries to stop making estrogen and progesterone. Some GnRHas are used to treat prostate cancer. Also called GnRH agonist, gonadotropin-releasing hormone agonist, LHRH agonist, and luteinizing hormone-releasing hormone agonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  goiter: (GOY-ter)
    Pronunciation of dictionary term "goiter"
    An enlarged thyroid. It may be caused by too little iodine in the diet or by other conditions. Most goiters are not cancer.
  gold fiducial marker seeds: (… fih-DOO-shul MAR-ker …)
    Pronunciation of dictionary term "gold fiducial marker seeds"
    Tiny, gold seeds, about the size of a grain of rice, that are put in and/or around a tumor to show exactly where it is in the body. Doctors are then able to target the tumor directly and give higher doses of radiation with less harm to nearby healthy tissue. Also called gold fiducial markers, gold seeds, and gold-seed fiducial markers.
  gold fiducial markers: (… fih-DOO-shul MAR-kers)
    Pronunciation of dictionary term "gold fiducial markers"
    Tiny, gold seeds, about the size of a grain of rice, that are put in and/or around a tumor to show exactly where it is in the body. Doctors are then able to target the tumor directly and give higher doses of radiation with less harm to nearby healthy tissue. Also called gold fiducial marker seeds, gold seeds, and gold-seed fiducial markers.
  gold seeds: (gold seeds)
    Pronunciation of dictionary term "gold seeds"
    Tiny, gold seeds, about the size of a grain of rice, that are put in and/or around a tumor to show exactly where it is in the body. Doctors are then able to target the tumor directly and give higher doses of radiation with less harm to nearby healthy tissue. Also called gold fiducial marker seeds, gold fiducial markers, and gold-seed fiducial markers.
  gold therapy: (… THAYR-uh-pee)
    Pronunciation of dictionary term "gold therapy"
    A procedure that uses gold salts (a salt form of the metal element gold) to treat diseases, such as rheumatoid arthritis. The gold salts stop cells from releasing chemicals that can harm tissues. Also called aurotherapy and chrysotherapy.
  gold-seed fiducial markers: (… fih-DOO-shul MAR-kers)
    Pronunciation of dictionary term "gold-seed fiducial markers"
    Tiny, gold seeds, about the size of a grain of rice, that are put in and/or around a tumor to show exactly where it is in the body. Doctors are then able to target the tumor directly and give higher doses of radiation with less harm to nearby healthy tissue. Also called gold fiducial marker seeds, gold fiducial markers, and gold seeds.
  Golgi apparatus: (GOL-jee A-puh-RA-tus)
    Pronunciation of dictionary term "Golgi apparatus"
    A stack of small flat sacs formed by membranes inside the cell’s cytoplasm (gel-like fluid). The Golgi apparatus prepares proteins and lipid (fat) molecules for use in other places inside and outside the cell. The Golgi apparatus is a cell organelle. Also called Golgi body and Golgi complex.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  Golgi body: (GOL-jee BAH-dee)
    Pronunciation of dictionary term "Golgi body"
    A stack of small flat sacs formed by membranes inside the cell’s cytoplasm (gel-like fluid). The Golgi body prepares proteins and lipid (fat) molecules for use in other places inside and outside the cell. The Golgi body is a cell organelle. Also called Golgi apparatus and Golgi complex.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  Golgi complex: (GOL-jee KOM-plex)
    Pronunciation of dictionary term "Golgi complex"
    A stack of small flat sacs formed by membranes inside the cell’s cytoplasm (gel-like fluid). The Golgi complex prepares proteins and lipid (fat) molecules for use in other places inside and outside the cell. The Golgi complex is a cell organelle. Also called Golgi apparatus and Golgi body.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  gonad: (GOH-nad)
    Pronunciation of dictionary term "gonad"
    The part of the reproductive system that produces and releases eggs (ovary) or sperm (testicle/testis).
  gonadal dysgenesis: (goh-NA-dul dis-JEH-neh-sis)
    Pronunciation of dictionary term "gonadal dysgenesis"
    Abnormal development of a gonad (ovary or testicle). Men with gonadal dysgenesis have a greater risk of developing testicular cancer. Gonadal dysgenesis is usually part of a genetic syndrome.
  gonadal shielding: (goh-NA-dul SHEEL-ding)
    Pronunciation of dictionary term "gonadal shielding"
    A procedure used to help keep a person fertile by preventing damage to reproductive organs during radiation therapy. A protective shield is placed on the outside of the body to cover the area of the gonads (the testicles or ovaries) and other parts of the reproductive system during radiation therapy. For males, this would also include the prostate and penis. For females, it would also include the fallopian tubes, uterus, cervix, and vagina. Gonadal shielding is a type of fertility preservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  gonadoblastoma: (goh-NA-doh-blas-TOH-muh)
    Pronunciation of dictionary term "gonadoblastoma"
    A rare tumor that is made up of more than one type of cell found in the gonads (testicles and ovaries), including germ cells, stromal cells, and granulosa cells. Gonadoblastomas are usually benign (not cancer), but they may sometimes become malignant (cancer) if not treated. Most patients with gonadoblastoma have certain chromosome abnormalities and abnormal gonads. Gonadoblastomas occur most often in children and young adults.
  gonadotropin-releasing hormone: (goh-NA-doh-TROH-pin-reh-LEE-sing HOR-mone)
    Pronunciation of dictionary term "gonadotropin-releasing hormone"
    A hormone made by a part of the brain called the hypothalamus. Gonadotropin-releasing hormone causes the pituitary gland in the brain to make and secrete the hormones luteinizing hormone (LH) and follicle-stimulating hormone (FSH). In men, these hormones cause the testicles to make testosterone. In women, they cause the ovaries to make estrogen and progesterone. Also called GnRH, LH-RH, LHRH, and luteinizing hormone-releasing hormone.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  gonadotropin-releasing hormone agonist: (goh-NA-doh-TROH-pin-reh-LEE-sing HOR-mone A-guh-nist)
    Pronunciation of dictionary term "gonadotropin-releasing hormone agonist"
    A substance that keeps the testicles and ovaries from making sex hormones by blocking other hormones that are needed to make them. In men, gonadotropin-releasing hormone agonists cause the testicles to stop making testosterone. In women, they cause the ovaries to stop making estrogen and progesterone. Some gonadotropin-releasing hormone agonists are used to treat prostate cancer. Also called GnRH agonist, GnRHa, LHRH agonist, and luteinizing hormone-releasing hormone agonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  gonadotropin-releasing hormone antagonist: (goh-NA-doh-TROH-pin-reh-LEE-sing HOR-mone an-TA-guh-nist)
    Pronunciation of dictionary term "gonadotropin-releasing hormone antagonist"
    A substance that blocks the pituitary gland from making hormones called follicle-stimulating hormone (FSH) and luteinizing hormone (LH). In men, this causes the testicles to stop making testosterone. In women, this causes the ovaries to stop making estrogen and progesterone. Some gonadotropin-releasing hormone antagonists are used to treat advanced prostate cancer. They are also used to treat certain gynecologic conditions and are being studied in the treatment of hormone-sensitive breast cancer. Also called GnRH antagonist, LHRH antagonist, and luteinizing hormone-releasing hormone antagonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  gonioscopy: (GOH-nee-OS-koh-pee)
    Pronunciation of dictionary term "gonioscopy"
    A procedure in which a gonioscope (special lens) is used to look at the front part of the eye between the cornea (the clear layer) and the iris (the colored part of the eye). Gonioscopy checks for blockages in the area where fluid drains out of the eye.
  Gonzalez regimen: (gun-ZAH-les REH-jih-men)
    Pronunciation of dictionary term "Gonzalez regimen"
    An alternative therapy that is being studied as a treatment for pancreatic cancer. It includes a special diet, nutritional supplements, pancreatic enzymes, and coffee enemas.
    More Information
    - Gonzalez Regimen
  Good Clinical Practice: (… KLIH-nih-kul PRAK-tis)
    Pronunciation of dictionary term "Good Clinical Practice"
    An international set of guidelines that helps make sure that the results of a clinical trial are reliable and that the patients are protected. Good Clinical Practice covers the way a clinical trial is designed, conducted, performed, monitored, audited, recorded, analyzed, and reported. Also called GCP.
  Gorlin syndrome: (GOR-lin SIN-drome)
    Pronunciation of dictionary term "Gorlin syndrome"
    A rare, inherited disorder that affects many organs and tissues in the body. People with this disorder have a very high risk of developing basal cell skin cancer during adolescence or early adulthood. They are also at risk of developing medulloblastoma (a type of brain cancer) and other types of cancer. Gorlin syndrome may also cause benign (not cancer) tumors in the jaw, heart, or ovaries. Other signs and symptoms include a large head and unusual facial features; small pits in the skin on the hands and feet; abnormalities of the spine, ribs, or skull; eye problems; and developmental problems. Gorlin syndrome is caused by a mutation (change) in the PTCH1 gene. Also called basal cell nevus syndrome, BCNS, NBCCS, and nevoid basal cell carcinoma syndrome.
    More Information
    - Nevoid basal cell carcinoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7166/basal-cell-nevus-syndrome)
    - Gorlin syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/gorlin-syndrome/)
    Basal cell carcinoma. A skin cancer lesion that looks reddish brown and slightly raised (left panel) and a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
    Photographs showing a skin cancer lesion that looks reddish brown and slightly raised (left panel) and the back of a person’s ear with a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
  goserelin acetate: (GOH-seh-REH-lin A-seh-tayt)
    Pronunciation of dictionary term "goserelin acetate"
    A drug used to treat prostate cancer, relieve the symptoms of advanced breast cancer, and treat problems with the endometrium (lining of the uterus). Goserelin acetate initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men and estrogen levels in women. With continued use, goserelin acetate lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in men and estrogen levels in women. Goserelin acetate may stop the growth of cancer cells that need testosterone or estrogen to grow. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist. Also called ZDX and Zoladex.
    More Information
    - Goserelin Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/goserelinacetate)
  gossypol: (GAH-sih-pole)
    Pronunciation of dictionary term "gossypol"
    A substance being studied in the treatment of several types of cancer. It comes from the seed of the cotton plant (Gossypium). It blocks the growth of cells and may kill cancer cells. Gossypol may also act as a male contraceptive (a type of birth control). Also called cottonseed meal toxin.
  gossypol acetic acid: (GAH-sih-pole uh-SEE-tik A-sid)
    Pronunciation of dictionary term "gossypol acetic acid"
    A substance being studied in the treatment of several types of cancer. It is a form of a chemical taken from the seed of the cotton plant (Gossypium). It blocks the growth of cells and may kill cancer cells. Gossypol acetic acid may also act as a male contraceptive (form of birth control).
  gout: (gowt)
    Pronunciation of dictionary term "gout"
    A condition marked by increased levels of uric acid in the blood, joints, and tissue. The buildup of uric acid in the joints and tissues causes arthritis and inflammation.
  gp100: A tumor-specific antigen used in the development of cancer vaccines. Also called glycoprotein 100.
  gp209-2M: A peptide (short piece of protein) made from the tumor-specific antigen gp100, and used to make vaccines being studied in the treatment of melanoma.
  gp96 heat shock protein-peptide complex vaccine: (… PROH-teen-PEP-tide KOM-plex vak-SEEN)
    Pronunciation of dictionary term "gp96 heat shock protein-peptide complex vaccine"
    A vaccine made from a patient’s tumor cells that may help the body’s immune system kill cancer cells. This vaccine is used to treat kidney cancer, a type of brain cancer called glioma, and metastatic melanoma (a type of skin cancer that has spread). It is also being studied in the treatment of other types of cancer. Also called gp96 HSP-peptide complex, Oncophage, and vitespen.
  gp96 HSP-peptide complex: (… PEP-tide KOM-plex)
    Pronunciation of dictionary term "gp96 HSP-peptide complex"
    A vaccine made from a patient’s tumor cells that may help the body’s immune system kill cancer cells. This vaccine is used to treat kidney cancer, a type of brain cancer called glioma, and metastatic melanoma (a type of skin cancer that has spread). It is also being studied in the treatment of other types of cancer. Also called gp96 heat shock protein-peptide complex vaccine, Oncophage, and vitespen.
  GPX-100: An anticancer drug that belongs to the family of drugs called antitumor antibiotics. It is an anthracycline.
  grade: (grayd)
    Pronunciation of dictionary term "grade"
    In cancer, a description of a tumor based on how abnormal the cancer cells and tissue look under a microscope and how quickly the cancer cells are likely to grow and spread. Low-grade cancer cells look more like normal cells and tend to grow and spread more slowly than high-grade cancer cells. Grading systems are different for each type of cancer. They are used to help plan treatment and determine prognosis. Also called histologic grade and tumor grade.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  grade 1 follicular lymphoma: (... fuh-LIH-kyoo-ler lim-FOH-muh)
    Pronunciation of dictionary term "grade 1 follicular lymphoma"
    An indolent (slow-growing) type of non-Hodgkin lymphoma marked by enlarged lymph nodes and small cells that have cleaved (u-shaped) nuclei.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  grade 2 follicular lymphoma: (... fuh-LIH-kyoo-ler lim-FOH-muh)
    Pronunciation of dictionary term "grade 2 follicular lymphoma"
    An indolent (slow-growing) type of non-Hodgkin lymphoma marked by enlarged lymph nodes and a mix of large cells and small cells that have cleaved (u-shaped) nuclei.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  grade 3 follicular lymphoma: (... fuh-LIH-kyoo-ler lim-FOH-muh)
    Pronunciation of dictionary term "grade 3 follicular lymphoma"
    A type of non-Hodgkin lymphoma marked by large cells and enlarged lymph nodes. Grade 3 follicular lymphoma is less common, and more aggressive than grades 1 or 2 follicular lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  Grade Group: (grayd groop)
    Pronunciation of dictionary term "Grade Group"
    A way of describing prostate cancer based on how abnormal the cancer cells in a biopsy sample look under a microscope and how quickly they are likely to grow and spread. It is based on the Gleason score, which is another type of prostate cancer grading system. Grade Group scores range from 1 to 5. The lower the Grade Group score, the more the cancer cells look like normal cells and are likely to grow and spread slowly. The Grade Group system is used to help plan treatment and determine prognosis (outcome).
  grade I DCIS: (grayd …)
    Pronunciation of dictionary term "grade I DCIS"
    A condition in which cells that look mostly like normal cells under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Grade I DCIS tends to grow more slowly than grade II or grade III DCIS. It is also less likely to come back or become invasive breast cancer and spread to other tissues. Also called grade I ductal carcinoma in situ, low-grade DCIS, and low-grade ductal carcinoma in situ.
  grade I ductal carcinoma in situ: (grayd … DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "grade I ductal carcinoma in situ"
    A condition in which cells that look mostly like normal cells under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Grade I ductal carcinoma in situ tends to grow more slowly than grade II or grade III ductal carcinoma in situ. It is also less likely to come back or become invasive breast cancer and spread to other tissues. Also called grade I DCIS, low-grade DCIS, and low-grade ductal carcinoma in situ.
  grade II DCIS: (grayd …)
    Pronunciation of dictionary term "grade II DCIS"
    A condition in which cells that look somewhat abnormal under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Grade II DCIS tends to grow more quickly than grade I DCIS but not as quickly as grade III DCIS. It is also more likely than grade I DCIS to come back or become invasive breast cancer and spread to other tissues but not as likely as grade III DCIS. Also called grade II ductal carcinoma in situ, intermediate-grade DCIS, and intermediate-grade ductal carcinoma in situ.
  grade II ductal carcinoma in situ: (grayd … DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "grade II ductal carcinoma in situ"
    A condition in which cells that look somewhat abnormal under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Grade II ductal carcinoma in situ tends to grow more quickly than grade I ductal carcinoma in situ but not as quickly as grade III ductal carcinoma in situ. It is also more likely than grade I ductal carcinoma in situ to come back or become invasive breast cancer and spread to other tissues but not as likely as grade III ductal carcinoma in situ. Also called grade II DCIS, intermediate-grade DCIS, and intermediate-grade ductal carcinoma in situ.
  grade III DCIS: (grayd …)
    Pronunciation of dictionary term "grade III DCIS"
    A condition in which cells that look very different from normal cells under a microscope are found in the lining of a breast duct. There may also be areas of dead cells in the abnormal tissue. The abnormal cells have not spread outside the duct to other tissues in the breast. Grade III DCIS tends to grow more quickly than grade I or grade II DCIS and is more likely to come back or become invasive breast cancer and spread to other tissues. Also called grade III ductal carcinoma in situ, high-grade DCIS, and high-grade ductal carcinoma in situ.
  grade III ductal carcinoma in situ: (grayd … DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "grade III ductal carcinoma in situ"
    A condition in which cells that look very different from normal cells under a microscope are found in the lining of a breast duct. There may also be areas of dead cells in the abnormal tissue. The abnormal cells have not spread outside the duct to other tissues in the breast. Grade III ductal carcinoma in situ tends to grow more quickly than grade I or grade II ductal carcinoma in situ and is more likely to come back or become invasive breast cancer and spread to other tissues. Also called grade III DCIS, high-grade DCIS, and high-grade ductal carcinoma in situ.
  grade IV astrocytoma: (... AS-troh-sy-TOH-muh)
    Pronunciation of dictionary term "grade IV astrocytoma"
    A fast-growing type of central nervous system tumor that forms from glial (supportive) tissue of the brain and spinal cord and has cells that look very different from normal cells. Grade IV astrocytoma usually occurs in adults and affects the brain more often than the spinal cord. Also called GBM, glioblastoma, and glioblastoma multiforme.
  grading: (GRAY-ding)
    Pronunciation of dictionary term "grading"
    A system for classifying cancer cells in terms of how abnormal they appear when examined under a microscope. The objective of a grading system is to provide information about the probable growth rate of the tumor and its tendency to spread. The systems used to grade tumors vary with each type of cancer. Grading plays a role in treatment decisions.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  Grafapex: (gra-FAY-pex)
    Pronunciation of dictionary term "Grafapex"
    A drug given with fludarabine phosphate before a donor hematopoietic stem cell transplant in adults and children aged 1 year and older with acute myeloid leukemia or myelodysplastic syndrome. It is also being studied in the treatment of other types of cancer. Grafapex may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called treosulfan.
  graft: (graft)
    Pronunciation of dictionary term "graft"
    Healthy skin, bone, or other tissue taken from one part of the body and used to replace diseased or injured tissue removed from another part of the body.
  graft-versus-host disease: (... dih-ZEEZ)
    Pronunciation of dictionary term "graft-versus-host disease"
    A condition that occurs when donated stem cells or bone marrow (the graft) see the healthy tissues in the patient’s body (the host) as foreign and attack them. It can also occur after an organ transplant. Graft-versus-host disease can cause damage to the host’s tissues and organs, especially the skin, liver, intestines, eyes, mouth, hair, nails, joints, muscles, lungs, kidneys, and genitals. The signs and symptoms may be severe and life threatening. Graft-versus-host disease can occur within the first few months after transplant (acute) or much later (chronic). Also called GVHD.
  graft-versus-tumor: (graft-VER-sus-TOO-mer)
    Pronunciation of dictionary term "graft-versus-tumor"
    An immune response to a person's tumor cells by immune cells present in a donor's transplanted tissue, such as bone marrow or peripheral blood.
  gram: (gram)
    Pronunciation of dictionary term "gram"
    A unit of weight in the metric system. One gram is equal to one thousandth of a kilogram and is approximately 30-times less than an ounce.
  granisetron: (gra-NIH-seh-tron)
    Pronunciation of dictionary term "granisetron"
    A drug used alone or with other drugs in adults to prevent nausea and vomiting caused by chemotherapy. Granisetron blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Granisetron is a type of antiemetic and a type of serotonin receptor antagonist. Also called Sancuso and Sustol.
    More Information
    - Granisetron (https://www.cancer.gov/about-cancer/treatment/drugs/granisetron)
  granisetron hydrochloride: (gra-NIH-seh-tron HY-droh-KLOR-ide)
    Pronunciation of dictionary term "granisetron hydrochloride"
    A drug used to prevent nausea and vomiting caused by chemotherapy and radiation therapy and to prevent and treat nausea and vomiting after surgery in adults. Granisetron hydrochloride blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Granisetron hydrochloride is a type of antiemetic and a type of serotonin receptor antagonist.
    More Information
    - Granisetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/granisetronhydrochloride)
  Granix: (GRA-nix)
    Pronunciation of dictionary term "Granix"
    A drug that contains the active ingredient filgrastim and is used in adults and children to treat severe neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Granix helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  granular cell tumor: (GRAN-yoo-lur sel TOO-mer)
    Pronunciation of dictionary term "granular cell tumor"
    A rare type of soft tissue tumor that usually begins in Schwann cells (cells that hold nerve cells in place). It can occur anywhere in the body, but it usually occurs in or under the skin of the head and neck (especially the mouth or tongue). It may also occur in the chest, breast, esophagus, stomach, or other internal organ. Most granular cell tumors are benign (not cancer), but some may be malignant (cancer) and spread quickly to nearby tissue. They usually occur in middle-aged adults. Also called Abrikossoff tumor.
  granular leukocyte: (GRAN-yoo-lur LOO-koh-site)
    Pronunciation of dictionary term "granular leukocyte"
    A type of immune cell that has granules (small particles) with enzymes that are released during infections, allergic reactions, and asthma. Neutrophils, eosinophils, and basophils are granular leukocytes. A granular leukocyte is a type of white blood cell. Also called granulocyte, PMN, and polymorphonuclear leukocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  granulocyte: (GRAN-yoo-loh-SITE)
    Pronunciation of dictionary term "granulocyte"
    A type of immune cell that has granules (small particles) with enzymes that are released during infections, allergic reactions, and asthma. Neutrophils, eosinophils, and basophils are granulocytes. A granulocyte is a type of white blood cell. Also called granular leukocyte, PMN, and polymorphonuclear leukocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  granulocyte colony-stimulating factor: (GRAN-yoo-loh-SITE KAH-luh-nee-STIM-yoo-LAY-ting FAK-ter)
    Pronunciation of dictionary term "granulocyte colony-stimulating factor"
    A drug used under the brand names Neupogen, Zarxio, and Nivestym to treat neutropenia (a lower-than-normal number of white blood cells), prevent infection, and prepare the blood for the collection of certain types of blood cells, and under the brand name Granix to treat neutropenia. Granulocyte colony-stimulating factor is used in patients who have certain cancers and neutropenia caused by some types of chemotherapy and in patients who have severe chronic neutropenia that is not caused by cancer treatment. It is also used before an autologous stem cell transplant. Granulocyte colony-stimulating factor helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor. Also called filgrastim and G-CSF.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  granulocyte-macrophage colony-stimulating factor: (GRAN-yoo-loh-SITE-MA-kroh-FAYJ KAH-luh-nee-STIM-yoo-LAY-ting FAK-ter)
    Pronunciation of dictionary term "granulocyte-macrophage colony-stimulating factor"
    A substance that helps make more white blood cells, especially granulocytes, macrophages, and cells that become platelets. It is a cytokine that is a type of hematopoietic (blood-forming) agent. Also called GM-CSF and sargramostim.
  granulocytic sarcoma: (GRAN-yoo-loh-SIH-tik sar-KOH-muh)
    Pronunciation of dictionary term "granulocytic sarcoma"
    A rare type of cancer that is made up of myeloblasts (a type of immature white blood cell) and forms outside the bone marrow and blood. The tumor cells may look green when viewed under a microscope. Granulocytic sarcomas can occur anywhere in the body. They most commonly occur in people with acute myeloid leukemia or a myeloproliferative disorder. Also called chloroma, extramedullary myeloid tumor, and myeloid sarcoma.
  granulocytopenia: (GRAN-yoo-loh-SY-toh-PEE-nee-uh)
    Pronunciation of dictionary term "granulocytopenia"
    A condition in which there is a lower-than-normal number of granulocytes (a type of white blood cell).
  granulosa cell tumor: (GRAN-yoo-LOH-suh sel TOO-mer)
    Pronunciation of dictionary term "granulosa cell tumor"
    A rare, slow-growing type of cancer that usually forms in the tissues that surround and support the ovaries. It may also form in the testicles, but this is very uncommon. Granulosa cell tumors make a female sex hormone called estrogen. This can cause abnormal vaginal bleeding and early puberty in females and an abnormal growth of breast tissue in males. Granulosa cell tumors tend to have a good prognosis (outcome) if diagnosed and treated early. They can occur in both adults and children. Granulosa cell tumors are the most common type of sex cord-stromal tumor in females.
  gray elm: (gray elm)
    Pronunciation of dictionary term "gray elm"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called Indian elm, red elm, slippery elm, sweet elm, Ulmus fulva, and Ulmus rubra.
  green tea extract: (green tee EK-strakt)
    Pronunciation of dictionary term "green tea extract"
    A mixture that is prepared from the leaves of the Camellia sinensis plant. It contains substances called flavonoids and polyphenols, which are antioxidants. Antioxidants help protect cells from damage caused by certain chemicals that may increase the risk of cancer and other diseases. Green tea extract may be taken to treat certain conditions. It is also being studied in the prevention of cancer and other diseases.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  Greene Menopause Index: (green MEH-nuh-pawz IN-dex)
    Pronunciation of dictionary term "Greene Menopause Index"
    A tool used by researchers to study the symptoms of menopause. It is a standard list of 21 questions which women use to rate how much they are bothered by menopause symptoms such as hot flashes, night sweats, rapid heartbeat, and difficulty sleeping.
  grief: (greef)
    Pronunciation of dictionary term "grief"
    The normal response to a major loss, such as the death of a loved one. Grief may also be felt by a person with a serious, long-term illness or with a terminal illness. It may include feelings of great sadness, anger, guilt, and despair. Physical problems, such as not being able to sleep and changes in appetite, may also be part of grief.
    More Information
    - Grief, Bereavement, and Loss
  grief counseling: (greef KOWN-suh-ling)
    Pronunciation of dictionary term "grief counseling"
    The process by which a trained counselor or a support group helps a person work through normal feelings of sorrow after a loss, such as the death of a loved one.
  grief therapy: (greef THAYR-uh-pee)
    Pronunciation of dictionary term "grief therapy"
    Treatment that helps a person work through a greater than normal reaction to a loss, such as the death of a loved one. This reaction may include behavioral and physical problems, extreme mourning, and being unable to separate emotionally from the person who died. Grief therapy may be individual or group therapy.
  groin: (groyn)
    Pronunciation of dictionary term "groin"
    The area where the thigh meets the abdomen.
  gross description: (… deh-SKRIP-shun)
    Pronunciation of dictionary term "gross description"
    In medicine, a description of what tissue taken during a biopsy looks like without using a microscope. The gross description may include the size, shape, color, and weight of the tissue sample. It may also include the body site where the tissue was taken from and how many samples were taken. Gross descriptions are usually included in a pathology report, which may be used to help diagnose diseases, such as cancer, and plan treatment.
    More Information
    - Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet)
  growth and development milestones: (grothe … dee-VEH-lup-MENT MILE-stones)
    Pronunciation of dictionary term "growth and development milestones"
    Goals for the expected sizes of infants and children and activities they should be able to do at specific ages, such as sit, stand, play, speak, think, and interact with others.
  growth factor: (grothe FAK-ter)
    Pronunciation of dictionary term "growth factor"
    A substance made by the body that functions to regulate cell division and cell survival. Some growth factors are also produced in the laboratory and used in biological therapy.
  growth hormone: (grothe HOR-mone)
    Pronunciation of dictionary term "growth hormone"
    A protein made by the pituitary gland that helps control body growth and the use of glucose and fat in the body. Also called somatotropin.
  GSD: A type of inherited disorder in which there are problems with how a form of glucose (sugar) called glycogen is stored and used in the body. Certain enzymes that help make or break down glycogen are missing or do not work the way they should. This causes abnormal amounts or types of glycogen in the tissues, especially in the liver and in muscle tissue. There are many types of GSD, which can cause problems in different parts of the body, including the liver, muscles, kidneys, and heart. Also called glycogen storage disease.
  GSK1070916A: A substance being studied in the treatment of some types of cancer. It blocks certain enzymes (Aurora kinases) involved in cell division and may kill cancer cells. It is a type of serine/threonine protein kinase inhibitor. Also called Aurora B/C kinase inhibitor GSK1070916A.
  GTD: A rare condition in which abnormal cells grow inside the uterus from tissue that forms after conception (the joining of sperm and egg). This tissue is made of trophoblastic cells, which normally surround the fertilized egg in the uterus and help connect the fertilized egg to the wall of the uterus. These cells also form part of the placenta (the organ that passes nutrients from the mother to the fetus). Most GTDs are benign (not cancer) and do not spread, but some types are malignant (cancer) and spread to nearby tissues or other parts of the body. The two main types of GTDs are hydatidiform mole and choriocarcinoma. Also called gestational trophoblastic disease, gestational trophoblastic tumor, and GTT.
    More Information
    - Gestational Trophoblastic Disease (https://www.cancer.gov/types/gestational-trophoblastic)
  GTI-2040: A substance being studied in the treatment of cancer. It blocks the production of a protein called ribonucleotide reductase, which helps cells make DNA. This may kill cancer cells that need ribonucleotide reductase to grow. It may also make cells more sensitive to anticancer drugs. It is a type of antisense oligonucleotide, and a type of ribonucleotide reductase inhibitor.
  GTT: A rare condition in which abnormal cells grow inside the uterus from tissue that forms after conception (the joining of sperm and egg). This tissue is made of trophoblastic cells, which normally surround the fertilized egg in the uterus and help connect the fertilized egg to the wall of the uterus. These cells also form part of the placenta (the organ that passes nutrients from the mother to the fetus). Most GTTs are benign (not cancer) and do not spread, but some types are malignant (cancer) and spread to nearby tissues or other parts of the body. The two main types of GTTs are hydatidiform mole and choriocarcinoma. Also called gestational trophoblastic disease, gestational trophoblastic tumor, and GTD.
    More Information
    - Gestational Trophoblastic Disease (https://www.cancer.gov/types/gestational-trophoblastic)
  guadecitabine: (GWAH-deh-SY-tuh-been)
    Pronunciation of dictionary term "guadecitabine"
    A substance being studied in the treatment of some types of cancer. Guadecitabine may stop the growth of tumor cells by blocking some of the enzymes needed for cells to divide. It may also make cancer cells more sensitive to other anticancer drugs. Guadecitabine is a type of antimetabolite Also called SGI-110.
  guaiac: (GWY-ak)
    Pronunciation of dictionary term "guaiac"
    A substance from a type of tree called Guaiacum that grows in the Caribbean. Guaiac is used in the fecal occult blood test (a test for blood in human stool samples).
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  guaiac fecal occult blood test: (GWY-ak FEE-kul uh-KULT …)
    Pronunciation of dictionary term "guaiac fecal occult blood test"
    A test that checks for occult (hidden) blood in the stool. Small samples of stool are placed on special cards coated with a chemical substance called guaiac and sent to a doctor or laboratory for testing. A testing solution is put on the cards and the guaiac causes the stool sample to change color. If there is blood in the stool, the color changes very quickly. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called gFOBT, guaiac smear test, and stool guaiac test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A guaiac fecal occult blood test (FOBT) checks for occult (hidden) blood in the stool. Small samples of stool are placed on a special card and returned to a doctor or laboratory for testing.
    Guaiac fecal occult blood test (FOBT) kit; shows card, applicator, and return envelope.
  guaiac smear test: (GWY-ak smeer …)
    Pronunciation of dictionary term "guaiac smear test"
    A test that checks for occult (hidden) blood in the stool. Small samples of stool are placed on special cards coated with a chemical substance called guaiac and sent to a doctor or laboratory for testing. A testing solution is put on the cards and the guaiac causes the stool sample to change color. If there is blood in the stool, the color changes very quickly. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called gFOBT, guaiac fecal occult blood test, and stool guaiac test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A guaiac fecal occult blood test (FOBT) checks for occult (hidden) blood in the stool. Small samples of stool are placed on a special card and returned to a doctor or laboratory for testing.
    Guaiac fecal occult blood test (FOBT) kit; shows card, applicator, and return envelope.
  guanine: (GWAH-neen)
    Pronunciation of dictionary term "guanine"
    A chemical compound that is used to make one of the building blocks of DNA and RNA. It is a type of purine.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  guided imagery: (GY-ded IH-muh-jree)
    Pronunciation of dictionary term "guided imagery"
    A technique in which a person visualizes positive images or scenarios in their mind. During guided imagery, a person uses all their senses in their imagination to help relax the body and develop a sense of well-being. Guided imagery may be used to help relieve stress, pain, anxiety, and depression and to help with symptoms related to disease, such as cancer. Also called guided visualization and imagery therapy.
  guided visualization: (GY-ded VIH-zhoo-ul-lih-ZAY-shun)
    Pronunciation of dictionary term "guided visualization"
    A technique in which a person visualizes positive images or scenarios in their mind. During guided visualization, a person uses all their senses in their imagination to help relax the body and develop a sense of well-being. Guided visualization may be used to help relieve stress, pain, anxiety, and depression and to help with symptoms related to disease, such as cancer. Also called guided imagery and imagery therapy.
  Guillain-Barré syndrome: (gee-YAN-bah-RAY SIN-drome)
    Pronunciation of dictionary term "Guillain-Barré syndrome"
    A rare condition in which the body’s immune system attacks the nerves located outside the brain and spinal cord. Symptoms of Guillain-Barré syndrome include muscle weakness, muscle pain, numbness, and tingling that often begin in the legs or back and may spread to the arms, upper body, and face. Other symptoms may include problems with vision, speech, swallowing, digestion, and bladder control. Guillain-Barré syndrome can get worse quickly and cause paralysis and other serious or life-threatening problems, such as breathing problems and an abnormal blood pressure or heart rate. Most people with Guillain-Barré syndrome get better over time. Guillain-Barré syndrome is a type of autoimmune disease. Also called GBS.
    More Information
    - Guillain-Barre syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6554/guillain-barr-syndrome)
    - Guillain-Barré syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/guillain-barre-syndrome/)
  gums: (gumz)
    Pronunciation of dictionary term "gums"
    The tissue of the upper and lower jaws that surrounds the base of the teeth. Also called gingiva.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  gut flora: (... FLOR-uh)
    Pronunciation of dictionary term "gut flora"
    Bacteria and other organisms that live inside the intestines. They help digest food. Vitamins such as biotin and vitamin K are made by gut flora. Also called gut microflora, intestinal flora, intestinal microflora, and microflora.
  gut microflora: (... MY-kroh-FLOR-uh)
    Pronunciation of dictionary term "gut microflora"
    Bacteria and other organisms that live inside the intestines. They help digest food. Vitamins such as biotin and vitamin K are made by gut microflora. Also called gut flora, intestinal flora, intestinal microflora, and microflora.
  gutka: (GUT-kuh)
    Pronunciation of dictionary term "gutka"
    A type of smokeless tobacco that is made in India and is widely used throughout Asia. It is a mixture of tobacco, crushed areca nut (also called betel nut), spices, and other ingredients. It is used like chewing tobacco and is placed in the mouth, usually between the gum and cheek. Gutka contains nicotine and many harmful, cancer-causing chemicals. Using it can lead to nicotine addiction and can cause cancers of the lip, mouth, tongue, throat, and esophagus. Also called betel quid with tobacco.
    More Information
    - Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention (Health Professional Version) (https://www.cancer.gov/types/head-and-neck/hp/oral-prevention-pdq)
  GVHD: A condition that occurs when donated stem cells or bone marrow (the graft) see the healthy tissues in the patient’s body (the host) as foreign and attack them. It can also occur after an organ transplant. GVHD can cause damage to the host’s tissues and organs, especially the skin, liver, intestines, eyes, mouth, hair, nails, joints, muscles, lungs, kidneys, and genitals. The signs and symptoms may be severe and life threatening. GVHD can occur within the first few months after transplant (acute) or much later (chronic). Also called graft-versus-host disease.
  GW572016: A drug used with capecitabine or letrozole to treat certain types of HER2-positive breast cancer that are advanced or have spread. It is also being studied in the treatment of other types of cancer. GW572016 blocks EGFR and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called lapatinib ditosylate and Tykerb.
    More Information
    - Lapatinib Ditosylate (https://www.cancer.gov/about-cancer/treatment/drugs/lapatinibditosylate)
  GW786034: A drug used to treat adults with advanced renal cell carcinoma (a type of kidney cancer) or advanced soft tissue sarcoma that has already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. GW786034 blocks certain proteins, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called pazopanib hydrochloride and Votrient.
    More Information
    - Pazopanib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/pazopanibhydrochloride)
  GWAS: A study that compares DNA markers across the genome (the complete genetic material in a person) in people with a disease or trait to people without the disease or trait. These studies may uncover clues to help prevent, diagnose, and treat disease. Also called genome-wide association study.
    More Information
    - Genome-Wide Association Studies (GWAS) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genome-Wide-Association-Studies)
  gynecologic: (GY-neh-kuh-LAH-jik)
    Pronunciation of dictionary term "gynecologic"
    Having to do with the female reproductive tract (including the cervix, endometrium, fallopian tubes, ovaries, uterus, and vagina).
    More Information
    - Cancers by Body Location/System: Gynecologic (https://www.cancer.gov/types/by-body-location)
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  gynecologic cancer: (GY-neh-kuh-LAH-jik KAN-ser)
    Pronunciation of dictionary term "gynecologic cancer"
    Cancer of the female reproductive tract, including the cervix, endometrium, fallopian tubes, ovaries, uterus, and vagina.
    More Information
    - Cancers by Body Location/System: Gynecologic (https://www.cancer.gov/types/by-body-location)
  gynecologic oncologist: (GY-neh-kuh-LAH-jik on-KAH-loh-jist)
    Pronunciation of dictionary term "gynecologic oncologist"
    A doctor who has special training in diagnosing and treating cancers of the female reproductive organs.
  gynecologist: (GY-neh-KAH-loh-jist)
    Pronunciation of dictionary term "gynecologist"
    A doctor who has special training in diagnosing and treating diseases of the female reproductive organs.
  gynecomastia: (GY-neh-koh-MAS-tee-uh)
    Pronunciation of dictionary term "gynecomastia"
    The abnormal growth of breast gland tissue in males. Gynecomastia in infants and boys may be caused by an imbalance in certain hormones. It may also be caused by conditions that affect hormones, such as tumors; malnutrition; kidney, liver, or thyroid disease; or treatment with certain drugs. It can occur at any age.
  H and E staining: (… STAY-ning)
    Pronunciation of dictionary term "H and E staining"
    A common laboratory method that uses two dyes called hematoxylin and eosin that make it easier to see different parts of the cell under a microscope. Hematoxylin shows the ribosomes, chromatin (genetic material) within the nucleus, and other structures as a deep blue-purple color. Eosin shows the cytoplasm, collagen, connective tissue, and other structures that surround and support the cell as an orange-pink-red color. H and E staining helps identify different types of cells and tissues and provides important information about the pattern, shape, and structure of cells in a tissue sample. It is used to help diagnose diseases, such as cancer. Also called hematoxylin and eosin staining.
  H-RAS gene: (… jeen)
    Pronunciation of dictionary term "H-ras gene"
    A gene that makes a protein that is involved in cell signaling pathways that control cell growth and cell death. Mutated (changed) forms of the H-RAS gene may be found in some types of cancer. These changes may cause cancer cells to grow and spread in the body. Also called HRAS gene.
  H. pylori: (… py-LOR-ee)
    Pronunciation of dictionary term "H. pylori"
    A type of bacterium that causes inflammation and ulcers in the stomach or small intestine. People with H. pylori infections may be more likely to develop cancer in the stomach, including MALT (mucosa-associated lymphoid tissue) lymphoma. Also called Helicobacter pylori.
    More Information
    - Helicobacter pylori (H. pylori) and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/h-pylori-fact-sheet)
  hA20: A substance being studied in the treatment of several types of lymphoma. It binds to the protein CD20, which is found on B cells (a type of immune system cell) and some types of lymphoma cells. This causes the immune system to kill the cancer cells. hA20 is a type of monoclonal antibody. Also called HCD20, IMMU-106, and veltuzumab.
  HAART: Treatment that uses a combination of three or more drugs to treat HIV infection. HAART stops the virus from making copies of itself in the body. This may lessen the damage to the immune system caused by HIV and may slow down the development of AIDS. It may also help prevent transmission of HIV to others, including from mother to child during birth. Also called cART, combination antiretroviral therapy, and highly active antiretroviral therapy.
  hair follicle: (… FAH-lih-kul)
    Pronunciation of dictionary term "hair follicle"
    A shaft or opening on the surface of the skin through which hair grows.
    Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue.
    Skin anatomy; drawing shows layers of the epidermis, dermis, and subcutaneous tissue including hair shafts and follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and a sweat gland.
  hairy cell leukemia: (HAYR-ee sel loo-KEE-mee-uh)
    Pronunciation of dictionary term "hairy cell leukemia"
    A rare type of leukemia in which abnormal B-lymphocytes (a type of white blood cell) are present in the bone marrow, spleen, and peripheral blood. When viewed under a microscope, these cells appear to be covered with tiny hair-like projections.
    More Information
    - Hairy Cell Leukemia Treatment
  Halaven: (HA-lih-ven)
    Pronunciation of dictionary term "Halaven"
    A drug used to treat certain types of breast cancer and liposarcoma (a type of soft tissue sarcoma) that have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Halaven blocks cell growth by stopping cell division and may kill cancer cells. It is a type of antimicrotubule agent. Also called E7389 and eribulin mesylate.
    More Information
    - Eribulin Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/eribulinmesylate)
  Haldol: (HAL-dol)
    Pronunciation of dictionary term "Haldol"
    A drug used to treat certain mental and neurological disorders. It is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of antiemetic and a type of antipsychotic. Also called haloperidol.
  half-sibling: (haf-SIB-ling)
    Pronunciation of dictionary term "half-sibling"
    A person’s brother or sister who has one parent in common.
  hallucination: (huh-LOO-sih-NAY-shun)
    Pronunciation of dictionary term "hallucination"
    A sight, sound, smell, taste, or touch that a person believes to be real but is not real. Hallucinations can be caused by nervous system disease, certain drugs, or mental disorders.
  halofuginone hydrobromide: (HA-loh-FYOO-jih-none HY-droh-BROH-mide)
    Pronunciation of dictionary term "halofuginone hydrobromide"
    A substance that is being studied for its ability to slow the growth of connective tissue and to prevent the growth of new blood vessels that tumors need to grow. It is a type of quinazolinone alkaloid and a type of antiangiogenesis agent.
  haloperidol: (ha-loh-PAYR-ih-dol)
    Pronunciation of dictionary term "haloperidol"
    A drug used to treat certain mental and neurological disorders. It is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of antiemetic and a type of antipsychotic. Also called Haldol.
  Halsted radical mastectomy: (HAWL-sted RA-dih-kul ma-STEK-toh-mee)
    Pronunciation of dictionary term "Halsted radical mastectomy"
    Surgery to remove the whole breast, all of the lymph nodes under the arm, and the chest wall muscles under the breast. For many years, Halsted radical mastectomy was the type of breast cancer surgery used most often, but it is rarely used now. It may be used only when breast cancer has spread to the chest wall muscles. Also called radical mastectomy.
    Radical mastectomy. The whole breast, all of the lymph nodes under the arm, and the chest wall muscles under the breast are removed. For many years, radical mastectomy was the type of breast cancer surgery used most often, but it is rarely used now.
    Radical mastectomy; the drawing on the left shows the removal of the whole breast and the lymph nodes under the arm. The drawing on the right shows a cross-section of the breast, including the fatty tissue and chest wall (ribs and muscle). A tumor in the breast is also shown.
  hamartoma: (HA-mar-TOH-muh)
    Pronunciation of dictionary term "hamartoma"
    A benign (not cancer) growth made up of an abnormal mixture of cells and tissues normally found in the area of the body where the growth occurs.
  hand-foot syndrome: (... SIN-drome)
    Pronunciation of dictionary term "hand-foot syndrome"
    A condition marked by pain, swelling, numbness, tingling, or redness of the hands or feet. It sometimes occurs as a side effect of certain anticancer drugs. Also called palmar-plantar erythrodysesthesia.
  haploidentical donor: (hap-loh-i-DEN-tih-kul DOH-ner)
    Pronunciation of dictionary term "haploidentical donor"
    A term used to describe a tissue donor whose HLA tissue type partially matches (usually 50%) the HLA tissue type of a person receiving a stem cell or organ transplant. HLAs are a set of cell surface markers found on a person’s cells and tissues that play an important role in the body’s immune response to foreign substances. Before someone receives a transplant, their HLA tissue type will be matched with that of a potential donor. A haploidentical donor, such as a parent, child, or sibling, may be used in a stem cell or organ transplant when a fully or closely matched donor is not available.
  happy major: (HA-pee MAY-jer)
    Pronunciation of dictionary term "happy major"
    A plant whose seeds and root have been used in some cultures to treat certain medical problems. It may have antioxidant effects. The scientific name is Arctium lappa. Also called burdock and lappa.
  hard palate: (... PAL-et)
    Pronunciation of dictionary term "hard palate"
    The front, bony part of the roof of the mouth.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  Hashimoto disease: (HAH-shee-MOH-toh dih-ZEEZ)
    Pronunciation of dictionary term "Hashimoto disease"
    An autoimmune condition of the thyroid gland (a gland located beneath the larynx). It is caused by the formation of antibodies that attack the thyroid gland and it usually causes hypothyroidism (too little thyroid hormone). Symptoms include fatigue, weight gain, constipation, dry skin, depression, and the inability to exercise. It is more common in females and can run in families. Also called autoimmune thyroiditis and Hashimoto thyroiditis.
  Hashimoto thyroiditis: (HAH-shee-MOH-toh thy-roy-DY-tis)
    Pronunciation of dictionary term "Hashimoto thyroiditis"
    An autoimmune condition of the thyroid gland (a gland located beneath the larynx). It is caused by the formation of antibodies that attack the thyroid gland and it usually causes hypothyroidism (too little thyroid hormone). Symptoms include fatigue, weight gain, constipation, dry skin, depression, and the inability to exercise. It is more common in females and can run in families. Also called autoimmune thyroiditis and Hashimoto disease.
  hawthorn fruit: (HAW-thorn froot)
    Pronunciation of dictionary term "hawthorn fruit"
    The fruit of the hawthorn tree or bush. It has been used in some cultures to treat certain medical problems, including heart problems and gastrointestinal problems.
  hazard ratio: (HA-zurd RAY-shee-oh)
    Pronunciation of dictionary term "hazard ratio"
    A measure of how often a particular event happens in one group compared to how often it happens in another group, over time. In cancer research, hazard ratios are often used in clinical trials to measure survival at any point in time in a group of patients who have been given a specific treatment compared to a control group given another treatment or a placebo. A hazard ratio of one means that there is no difference in survival between the two groups. A hazard ratio of greater than one or less than one means that survival was better in one of the groups.
  HBOC syndrome: (… SIN-drome)
    Pronunciation of dictionary term "HBOC syndrome"
    An inherited disorder in which the risk of breast cancer (especially before the age of 50) and ovarian cancer is higher than normal. Most cases of HBOC syndrome are caused by certain mutations (changes) in the BRCA1 or the BRCA2 gene. People with HBOC syndrome may also have an increased risk of other types of cancer, including pancreatic cancer, prostate cancer, and melanoma. Also called hereditary breast and ovarian cancer syndrome.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - BRCA1 hereditary breast and ovarian cancer syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/12351/brca1-hereditary-breast-and-ovarian-cancer-syndrome)
    - BRCA2 hereditary breast and ovarian cancer syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/12352/brca2-hereditary-breast-and-ovarian-cancer-syndrome)
  HBV: A virus that causes hepatitis (inflammation of the liver). It is carried and passed to others through the blood and other body fluids. Different ways the virus is spread include sharing needles with an infected person and being stuck accidentally by a needle contaminated with the virus. Infants born to infected mothers may also become infected with the virus. Although many patients who are infected with HBV may not have symptoms, long-term infection may lead to cirrhosis (scarring of the liver) and liver cancer. Also called hepatitis B virus.
  HCA: A chemical that is formed when meat, poultry, or fish is cooked at high temperatures, such as frying, broiling, and barbecuing. HCAs are carcinogens (substances that may cause cancer). Also called heterocyclic amine.
    More Information
    - Chemicals in Meat Cooked at High Temperatures and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/cooked-meats-fact-sheet)
  HCC: A type of cancer that forms in liver cells called hepatocytes. Hepatocytes are the most common cells of the liver, and they carry out most of the functions of the liver. Factors that may increase a person’s risk of developing HCC include having chronic infection with hepatitis B virus or hepatitis C virus, non-alcoholic steatohepatitis, chronic alcohol use disorder, and cirrhosis. Most adult primary liver cancers are HCCs. Also called hepatocellular carcinoma.
  HCD20: A substance being studied in the treatment of several types of lymphoma. It binds to the protein CD20, which is found on B cells (a type of immune system cell) and some types of lymphoma cells. This causes the immune system to kill the cancer cells. HCD20 is a type of monoclonal antibody. Also called hA20, IMMU-106, and veltuzumab.
  HCP: A type of advance directive that gives a person (such as a relative, lawyer, or friend) the authority to make health care decisions for another person. It becomes active when that person loses the ability to make decisions for himself or herself. Also called health care proxy.
  hCRF: A substance being studied in the treatment of brain cancer. It is made naturally by the hypothalamus (a part of the brain) and can also be made in the laboratory. hCRF may help reduce symptoms caused by edema (swelling) of the brain. It is a type of neurohormone. Also called human corticotropin-releasing factor.
  HCT: The amount of whole blood that is made up of red blood cells. It depends on the number and size of red blood cells. A HCT test is usually part of a complete blood count (CBC). It may be used to check for conditions such as anemia, dehydration, malnutrition, and leukemia. Also called hematocrit.
  HCV: A virus that causes hepatitis (inflammation of the liver). It is carried and passed to others through the blood and other body fluids. Different ways the virus is spread include sharing needles with an infected person and being stuck accidentally by a needle contaminated with the virus. Infants born to infected mothers may also become infected with the virus. Although patients who are infected with HCV may not have symptoms, long-term infection may lead to cirrhosis (scarring of the liver) and liver cancer. These patients may also have an increased risk for certain types of non-Hodgkin lymphoma. Also called hepatitis C virus.
  HDAC: An enzyme that removes a small molecule called an acetyl group from histones (proteins found in chromosomes). This changes the way the histones bind to DNA and may affect its activity. HDAC inhibitors are being studied in the treatment of cancer. Also called histone deacetylase.
  HDAC inhibitor: (...in-HIH-bih-ter)
    Pronunciation of dictionary term "HDAC inhibitor"
    A substance that causes a chemical change that stops tumor cells from dividing. HDAC inhibitors are being studied in the treatment of cancer. Also called histone deacetylase inhibitor.
  HDAC inhibitor SNDX-275: (... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "HDAC inhibitor SNDX-275"
    A substance being studied in the treatment of several types of cancer. It blocks enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase (HDAC) inhibitor. Also called entinostat and SNDX-275.
  HDGC: A rare, inherited disorder that increases the risk of developing a type of stomach cancer called diffuse gastric cancer. This cancer grows in the lining of the stomach, which causes the lining to become thick and hard. The cancer is also likely to spread to other parts of the body, such as the liver or bone. Women with HDGC also have an increased risk of developing a type of breast cancer that begins in the lobules (milk glands) of the breast. HDGC is usually caused by mutations (changes) in the CDH1 gene that are inherited in an autosomal dominant manner. It is a type hereditary cancer syndrome. Also called familial diffuse gastric cancer and hereditary diffuse gastric cancer.
    More Information
    - Hereditary diffuse gastric cancer (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10900/hereditary-diffuse-gastric-cancer)
    - Hereditary diffuse gastric cancer (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-diffuse-gastric-cancer/)
  HDR: An amount of radiation that is greater than that given in typical radiation therapy. HDR is precisely directed at the tumor to avoid damaging healthy tissue, and may kill more cancer cells in fewer treatments. Also called high-dose radiation.
  HE4: A protein found on cells that line the lungs and reproductive organs, such as the ovaries. HE4 may be found in higher than normal amounts in patients with some types of cancer, including ovarian epithelial cancer. Measuring the amount of HE4 in the blood may help plan cancer treatment or find out if cancer is getting worse or has come back. It is a type of tumor marker. Also called human epididymis protein 4.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  head and neck cancer: (... KAN-ser)
    Pronunciation of dictionary term "head and neck cancer"
    Cancer that forms in certain areas of the head and neck, including tissues in the nasal cavity (the hollow space inside the nose), sinuses, lips, mouth, salivary glands, throat, and larynx (voice box). Most head and neck cancers begin in squamous cells (thin, flat cells that line the moist surfaces of the head and neck). The most important factors that increase a person’s risk of developing head and neck cancer are tobacco use, heavy alcohol use, and infection with certain types of high-risk human papillomavirus (HPV).
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Cancers of the head and neck can form in the tissues of the paranasal sinuses, nasal cavity, oral cavity, lips, tongue, salivary glands, larynx (voice box), and pharynx. The pharynx includes the nasopharynx, oropharynx, and hypopharynx.
    Head and neck cancer regions; drawing shows areas of the head and neck where cancer can occur, including the paranasal sinuses, nasal cavity, oral cavity, lips, tongue, salivary glands, larynx (voice box), and pharynx. The pharynx includes the nasopharynx, oropharynx, and hypopharynx.
  healing touch: (HEEL-ing tuch)
    Pronunciation of dictionary term "healing touch"
    A form of complementary and alternative medicine based on the belief that vital energy flows through the human body. This energy is said to be balanced or made stronger by practitioners who pass their hands over, or gently touch, a patient's body. Healing touch is being studied in patients receiving cancer therapy, to find out if it can improve quality of life, boost the immune system, or reduce side effects. Healing touch is a type of energy therapy. Also called therapeutic touch.
  health care provider: (helth kayr proh-VY-der)
    Pronunciation of dictionary term "healthcare provider"
    A licensed person or organization that provides health care services. Examples of health care providers include doctors, nurses, therapists, pharmacists, laboratories, hospitals, clinics, and other health care centers.
  health care proxy: (helth kayr PRAK-see)
    Pronunciation of dictionary term "healthcare proxy"
    A type of advance directive that gives a person (called a proxy) the authority to make medical decisions for another person if that person is not able to make their own decisions. A proxy is usually a spouse, relative, friend, or lawyer who knows the person's values, wishes, and treatment preferences. Also called durable power of attorney for health care and medical power of attorney.
  health disparity: (helth dih-SPAYR-ih-tee)
    Pronunciation of dictionary term "health disparity"
    A type of preventable health difference that is closely linked with social, political, economic, and environmental disadvantage. Health disparities may occur because of race, ethnicity, sex, gender identity, sexual orientation, age, religion, disability, education, income, where people live, or other characteristics. For example, certain race and ethnic groups may have higher rates of disease, disability, and death than those in other groups because they are more likely to have problems having access to good health care, healthy food, or the latest medical treatments. Research is being done to learn more about health disparities in certain groups of people and ways to reduce them.
    More Information
    - Cancer Disparities (https://www.cancer.gov/about-cancer/understanding/disparities)
    - Cancer Health Disparities Research (https://www.cancer.gov/research/areas/disparities)
  health equity: (helth EH-kwih-tee)
    Pronunciation of dictionary term "health equity"
    A situation in which all people are given the chance to live as healthy a life as possible regardless of their race, ethnicity, sex, sexual orientation, disability, education, job, religion, language, where they live, or other factors. A lack of health equity can result in differences in health outcomes, such as rates and severity of disease, disability, death, and quality of life. There are efforts to promote health equity by looking at root causes and removing barriers to equal access to health care services.
  health history: (helth HIH-stuh-ree)
    Pronunciation of dictionary term "health history"
    A record of information about a person’s health. A personal health history may include information about allergies, illnesses, surgeries, immunizations, and results of physical exams and tests. It may also include information about medicines taken and health habits, such as diet and exercise. A family health history includes health information about a person’s close family members (parents, grandparents, children, brothers, and sisters). This includes their current and past illnesses. A family health history may show a pattern of certain diseases in a family. Also called medical history.
  Health Insurance Portability and Accountability Act: (helth in-SHOOR-ents por-tuh-BIH-lih-tee ... uh-KOWN-tuh-BIH-lih-tee ...)
    Pronunciation of dictionary term "Health Insurance Portability and Accountability Act"
    A 1996 U.S. law that allows workers and their families to keep their health insurance when they change or lose their jobs. The privacy rule of the Health Insurance Portability and Accountability Act protects the privacy of a person’s health information and keeps it from being misused. It gives people the right to receive and review their health records and to choose with whom their health care providers and health insurance companies share their information (including friends, family members, and caregivers). The law also includes standards for setting up and maintaining secure electronic health records. Also called HIPAA and Kassebaum Kennedy Act.
  health insurance premium: (helth in-SHOOR-ents PREE-mee-um)
    Pronunciation of dictionary term "health insurance premium"
    The amount of money that a patient pays monthly to a health insurance company for health care coverage. Coverage may include visits to the doctor, laboratory tests, prescription medicines, and hospital stays.
  healthy control: (HEL-thee kun-TROLE)
    Pronunciation of dictionary term "healthy control"
    In a clinical study, a person who does not have the disorder or disease being studied. Results from healthy controls are compared to results from the group being studied.
  heart cancer: (hart KAN-ser)
    Pronunciation of dictionary term "heart cancer"
    A rare cancer that develops in tissues of the heart. Also called cardiac sarcoma.
  heart disease: (hart dih-ZEEZ)
    Pronunciation of dictionary term "heart disease"
    A type of disease that affects the heart or blood vessels. The risk of certain heart diseases may be increased by smoking, high blood pressure, high cholesterol, unhealthy diet, lack of exercise, and obesity. The most common heart disease is coronary artery disease (narrow or blocked coronary arteries), which can lead to chest pain, heart attacks, or stroke. Other heart diseases include congestive heart failure, heart rhythm problems, congenital heart disease (heart disease at birth), and endocarditis (inflamed inner layer of the heart). Also called cardiovascular disease.
  heart rate: (hart rayt)
    Pronunciation of dictionary term "heart rate"
    In medicine, the number of times the heart beats within a certain time period, usually a minute. The heart rate can be felt at the wrist, side of the neck, back of the knees, top of the foot, groin, and other places in the body where an artery is close to the skin. The resting heart rate is normally between 60 and 100 beats a minute in a healthy adult who is at rest. Measuring the heart rate gives important information about a person’s health. Also called pulse.
  heat-shock protein: (... PROH-teen)
    Pronunciation of dictionary term "heat-shock protein"
    One of a group of proteins that help protect cells from stresses such as heat, cold, and low amounts of oxygen or glucose (sugar). Heat-shock proteins help other proteins function in normal cells and may be present at high levels in cancer cells. Blocking the activity of a heat-shock protein called HSP90 is being studied in the treatment of cancer. Other heat-shock proteins including HSP70 and gp96 are being studied in vaccines to treat cancer. Also called HSP and stress protein.
  hedgehog signaling pathway: (HEJ-hog SIG-nuh-ling PATH-way)
    Pronunciation of dictionary term "hedgehog signaling pathway"
    Describes a group of proteins that work together in a cell to send signals from the cell membrane to the nucleus. The hedgehog signaling pathway is involved in cell growth and differentiation that occurs during the formation of tissues and organs in an embryo. It also plays an important role in the maintenance of stem cells (cells from which other types of cells develop) and in the repair and regeneration of adult tissues. Abnormalities in proteins that are part of the hedgehog signaling pathway may lead to birth defects or diseases such as cancer. Drugs that target this pathway are being used to treat some types of cancer. These drugs may help keep cancer cells from growing.
  Hedyotis diffusa: (heh-dee-OH-tis dih-FYOO-suh)
    Pronunciation of dictionary term "Hedyotis diffusa"
    An herb used in traditional Chinese medicine to treat certain medical problems. It has been used to boost the immune system and may have anticancer effects.
  helical computed tomography: (HEE-lih-kul kum-PYOO-ted toh-MAH-gruh-fee)
    Pronunciation of dictionary term "helical computed tomography"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The x-ray machine scans the body in a spiral path. This allows more images to be made in a shorter time than with older CT methods. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly on the x-ray. Helical computed tomography also creates more detailed pictures and may be better at finding small abnormal areas inside the body. It may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called spiral CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  helical tomotherapy: (HEE-lih-kul toh-mah-THAYR-uh-pee)
    Pronunciation of dictionary term "helical tomotherapy"
    A type of therapy in which radiation is aimed at a tumor from many different directions. The patient lays on a table and is moved through a donut-shaped machine. The radiation source in the machine rotates around the patient in a spiral pattern. Before radiation, a 3-dimensional (3-D) image of the tumor is taken. This helps doctors find the highest dose of radiation that can be used to kill tumor cells while causing less damage to nearby tissue. Helical tomotherapy is a type of intensity-modulated radiation therapy (IMRT). Also called tomotherapy.
  Helicobacter pylori: (HEEL-ih-koh-BAK-ter py-LOR-ee)
    Pronunciation of dictionary term "Helicobacter pylori"
    A type of bacterium that causes inflammation and ulcers in the stomach or small intestine. People with Helicobacter pylori infections may be more likely to develop cancer in the stomach, including MALT (mucosa-associated lymphoid tissue) lymphoma. Also called H. pylori.
    More Information
    - Helicobacter pylori (H. pylori) and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/h-pylori-fact-sheet)
  helper T cell: (HEL-per … sel)
    Pronunciation of dictionary term "helper T cell"
    A type of immune cell that stimulates killer T cells, macrophages, and B cells to make immune responses. A helper T cell is a type of white blood cell and a type of lymphocyte. Also called CD4-positive T lymphocyte.
  hemagglutinin-neuraminidase: (HEE-muh-GLOO-tih-nin-NOOR-uh-MIH-nih-days)
    Pronunciation of dictionary term "hemagglutinin-neuraminidase"
    A protein found in the outer coat of paramyxoviruses. This protein helps virus particles bind to cells, making infection easier.
  Hemangeol: (hee-MAN-jee-ol)
    Pronunciation of dictionary term "Hemangeol"
    A drug that contains the active ingredient propranolol hydrochloride and is used to treat infants 5 weeks to 5 months of age with infantile hemangioma (a benign blood vessel tumor). It is also being studied in the treatment of other conditions and some types of cancer. Hemangeol may help shrink certain types of vascular tumors. It is a type of beta blocker.
    More Information
    - Propranolol Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/propranolol-hydrochloride)
  hemangiopericytoma: (hee-MAN-jee-oh-PAYR-ih-sy-TOH-muh)
    Pronunciation of dictionary term "hemangiopericytoma"
    A type of cancer involving blood vessels and soft tissue.
  hemangiosarcoma: (hee-MAN-jee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "hemangiosarcoma"
    A type of cancer that begins in the cells that line blood vessels.
  hematocrit: (hee-MA-toh-krit)
    Pronunciation of dictionary term "hematocrit"
    The amount of whole blood that is made up of red blood cells. It depends on the number and size of red blood cells. A hematocrit test is usually part of a complete blood count (CBC). It may be used to check for conditions such as anemia, dehydration, malnutrition, and leukemia. Also called HCT.
  hematogenous: (HEE-muh-TAH-jeh-nus)
    Pronunciation of dictionary term "hematogenous"
    Originating in the blood or spread through the bloodstream.
  hematologic cancer: (HEE-muh-tuh-LAH-jik KAN-ser)
    Pronunciation of dictionary term "hematologic cancer"
    Cancer that begins in blood-forming tissue, such as the bone marrow, or in the cells of the immune system. Examples of hematologic cancer are leukemia, lymphoma, and multiple myeloma. Also called blood cancer.
    More Information
    - Cancers by Body Location/System: Hematologic/Blood (https://www.cancer.gov/types/by-body-location)
  hematologist: (HEE-muh-TAH-loh-jist)
    Pronunciation of dictionary term "hematologist"
    A doctor who has special training in diagnosing and treating blood disorders.
  hematoma: (HEE-muh-TOH-muh)
    Pronunciation of dictionary term "hematoma"
    A pool of mostly clotted blood that forms in an organ, tissue, or body space. A hematoma is usually caused by a broken blood vessel that was damaged by surgery or an injury. It can occur anywhere in the body, including the brain. Most hematomas are small and go away on their own, but some may need to be removed by surgery.
  hematopathology laboratory: (hee-MA-toh-pa-THAH-loh-jee LA-bruh-tor-ee)
    Pronunciation of dictionary term "hematopathology laboratory"
    A laboratory that specializes in doing tests that help to diagnose and treat diseases of the blood, bone marrow, and lymph system.
  hematopoiesis: (hee-MA-toh-poy-EE-sis)
    Pronunciation of dictionary term "hematopoiesis"
    The formation of new blood cells.
  hematopoietic growth factor: (hee-MA-toh-poy-EH-tik ...)
    Pronunciation of dictionary term "hematopoietic growth factor"
    A group of proteins that causes blood cells to grow and mature.
  hematopoietic stem cell: (hee-MA-toh-poy-EH-tik stem sel)
    Pronunciation of dictionary term "hematopoietic stem cell"
    An immature cell that can develop into all types of blood cells, including white blood cells, red blood cells, and platelets. Hematopoietic stem cells are found in the peripheral blood and the bone marrow. Also called blood stem cell.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. Drawing shows a myeloid stem cell becoming a red blood cell, platelet, or myeloblast, which then becomes a white blood cell. Drawing also shows a lymphoid stem cell becoming a lymphoblast and then one of several different types of white blood cells.
  hematopoietic tissue: (hee-MA-toh-poy-EH-tik TIH-shoo)
    Pronunciation of dictionary term "hematopoietic tissue"
    Tissue in which new blood cells are formed.
  hematoporphyrin derivative: (HEE-muh-toh-POR-fih-rin deh-RIH-vuh-tiv)
    Pronunciation of dictionary term "hematoporphyrin derivative"
    A drug used in photodynamic therapy that is absorbed by tumor cells. When exposed to light, it becomes active and kills the cancer cells.
  hematoxylin and eosin staining: (hee-muh-TOK-suh-lin … EE-oh-sin STAY-ning)
    Pronunciation of dictionary term "hematoxylin and eosin staining"
    A common laboratory method that uses two dyes called hematoxylin and eosin that make it easier to see different parts of the cell under a microscope. Hematoxylin shows the ribosomes, chromatin (genetic material) within the nucleus, and other structures as a deep blue-purple color. Eosin shows the cytoplasm, collagen, connective tissue, and other structures that surround and support the cell as an orange-pink-red color. Hematoxylin and eosin staining helps identify different types of cells and tissues and provides important information about the pattern, shape, and structure of cells in a tissue sample. It is used to help diagnose diseases, such as cancer. Also called H and E staining.
  hematuria: (HEE-muh-TOOR-ee-uh)
    Pronunciation of dictionary term "hematuria"
    Blood in the urine.
  heme: (heem)
    Pronunciation of dictionary term "heme"
    The part of certain molecules that contains iron. The heme part of hemoglobin is the substance inside red blood cells that binds to oxygen in the lungs and carries it to the tissues.
  hemihyperplasia: (HEH-mee-HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "hemihyperplasia"
    A condition in which one side of the body or a part of one side is larger than the other. Children with hemihyperplasia have an increased risk of developing certain types of cancer, including Wilms tumor (a childhood kidney cancer) and liver cancer. Also called hemihypertrophy.
  hemihypertrophy: (HEH-mee-hy-PER-troh-fee)
    Pronunciation of dictionary term "hemihypertrophy"
    A condition in which one side of the body or a part of one side is larger than the other. Children with hemihypertrophy have an increased risk of developing certain types of cancer, including Wilms tumor (a childhood kidney cancer) and liver cancer. Also called hemihyperplasia.
  hemilaryngectomy: (HEM-ee-LAYR-in-JEK-toh-mee)
    Pronunciation of dictionary term "hemilaryngectomy"
    An operation to remove one side of the larynx (voicebox).
  hemizygous: (HEH-mee-ZY-gus)
    Pronunciation of dictionary term "hemizygous"
    A term that describes a person who has only one copy of a gene rather than the usual two copies. Hemizygosity can occur under normal conditions. For example, because most males have one X chromosome and one Y chromosome, they are hemizygous for genes on those chromosomes. Hemizygosity can also occur under abnormal conditions, such as when two copies of a gene should be present but one is missing. For example, Turner syndrome occurs when a female inherits only one copy of the X chromosome instead of the usual two copies.
  hemochromatosis: (HEE-moh-kroh-muh-TOH-sis)
    Pronunciation of dictionary term "hemochromatosis"
    A condition in which the body takes up and stores more iron than it needs. The extra iron is stored in the liver, heart, and pancreas, which may cause liver disease, heart problems, organ failure, and cancer. It may also cause bronze skin, diabetes, pain in the joints and abdomen, tiredness, and impotence. Hemochromatosis may be inherited, or it may be caused by blood transfusions. Also called iron overload.
    More Information
    - Hemochromatosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10746/hemochromatosis)
    - Hemochromatosis (MedlinePlus) (https://medlineplus.gov/ency/article/000327.htm)
  hemoglobin: (HEE-moh-GLOH-bin)
    Pronunciation of dictionary term "hemoglobin"
    A protein inside red blood cells that carries oxygen from the lungs to tissues and organs in the body and carries carbon dioxide back to the lungs. Testing for the amount of hemoglobin in the blood is usually part of a complete blood cell (CBC) test.
  hemolysis: (hee-MAH-lih-sis)
    Pronunciation of dictionary term "hemolysis"
    The breakdown of red blood cells. Some diseases, medicines, and toxins may cause red blood cells to break down more quickly than usual.
  hemophagocytic lymphohistiocytosis: (HEE-moh-FA-goh-SIH-tik LIM-foh-HIS-tee-oh-sy-TOH-sis)
    Pronunciation of dictionary term "hemophagocytic lymphohistiocytosis"
    A rare disorder in which histiocytes and lymphocytes (types of white blood cells) build up in organs including the skin, spleen, and liver, and destroy other blood cells. Hemophagocytic lymphohistiocytosis may be inherited or caused by certain conditions or diseases, including infections, immunodeficiency (inability of the body to fight infections), and cancer. Also called HLH.
    More Information
    - Familial hemophagocytic lymphohistiocytosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6589/hemophagocytic-lymphohistiocytosis)
    - Familial hemophagocytic lymphohistiocytosis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-hemophagocytic-lymphohistiocytosis/)
  hemophilia: (HEE-moh-FIH-lee-uh)
    Pronunciation of dictionary term "hemophilia"
    Group of hereditary disorders in which affected individuals fail to make enough of certain proteins needed to form blood clots.
  hemoptysis: (hee-MOP-tih-sis)
    Pronunciation of dictionary term "hemoptysis"
    Coughing or spitting up blood from the respiratory tract.
  hemorrhage: (HEH-muh-rij)
    Pronunciation of dictionary term "hemorrhage"
    In medicine, loss of blood from damaged blood vessels. A hemorrhage may be internal or external, and usually involves a lot of bleeding in a short time.
  hemorrhagic cerebrovascular accident: (HEH-muh-RA-jik seh-REE-broh-VAS-kyoo-ler AK-sih-dent)
    Pronunciation of dictionary term "hemorrhagic cerebrovascular accident"
    A type of stroke that occurs when a blood vessel in the brain or on the surface of the brain leaks or breaks open, causing bleeding in or around the brain. This leads to swelling and pressure, which can damage cells and tissue in the brain. Hemorrhagic cerebrovascular accident is usually caused by high blood pressure, aneurysm, arteriovenous malformation, head injury, or a bleeding disorder. Also called hemorrhagic stroke.
  hemorrhagic cystitis: (HEH-muh-RA-jik sis-TY-tis)
    Pronunciation of dictionary term "hemorrhagic cystitis"
    A condition in which the lining of the bladder becomes inflamed and starts to bleed. The blood can be seen in the urine. Symptoms include pain and a burning feeling while urinating, feeling a need to urinate often, and being unable to control the flow of urine. Hemorrhagic cystitis may be caused by anticancer drugs, radiation therapy, infection, or being exposed to chemicals, such as dyes or insecticides.
  hemorrhagic stroke: (HEH-muh-RA-jik stroke)
    Pronunciation of dictionary term "hemorrhagic stroke"
    A type of stroke that occurs when a blood vessel in the brain or on the surface of the brain leaks or breaks open, causing bleeding in or around the brain. This leads to swelling and pressure, which can damage cells and tissue in the brain. Hemorrhagic stroke is usually caused by high blood pressure, aneurysm, arteriovenous malformation, head injury, or a bleeding disorder. Also called hemorrhagic cerebrovascular accident.
  hemorrhoid: (HEH-muh-ROYD)
    Pronunciation of dictionary term "hemorrhoid"
    An enlarged or swollen blood vessel, usually located near the anus or the rectum.
  hemp: An herb that comes from a variant of the Cannabis sativa plant and contains fiber, seeds, and oil used to make many different industrial and consumer products. These include textiles, building materials, paper, fabrics, soap, food, dietary supplements, and cosmetics. Hemp and marijuana come from the same species of Cannabis sativa, but the hemp variant contains very low levels of delta-9-THC (the main active chemical in marijuana that causes drug-like effects in the body). The hemp and marijuana variants of Cannabis sativa have their own chemical and genetic makeup and are regulated, grown, and used in different ways. Also called industrial hemp.
  heparin: (HEH-puh-rin)
    Pronunciation of dictionary term "heparin"
    A substance that slows the formation of blood clots. Heparin is made by the liver, lungs, and other tissues in the body and can also made in the laboratory. Heparin may be injected into muscle or blood to prevent or break up blood clots. It is a type of anticoagulant.
  hepatectomy: (HEH-puh-TEK-toh-mee)
    Pronunciation of dictionary term "hepatectomy"
    Surgery to remove all or part of the liver.
  hepatic: (heh-PA-tik)
    Pronunciation of dictionary term "hepatic"
    Refers to the liver.
  hepatic arterial infusion: (heh-PA-tik ar-TEER-ee-ul in-FYOO-zhun)
    Pronunciation of dictionary term "hepatic arterial infusion"
    A procedure to deliver chemotherapy directly to the liver. Catheters are put into an artery in the groin that leads directly to the liver, and drugs are given through the catheters.
  hepatic arterial occlusion: (heh-PA-tik ar-TEER-ee-ul uh-KLOO-zhun)
    Pronunciation of dictionary term "hepatic arterial occlusion"
    A block in blood flow to the liver. It can happen while giving chemotherapy through a catheter in the hepatic artery. Sometimes doctors use drugs or other agents to cause hepatic arterial occlusion on purpose. This block of blood flow to the liver helps kill cancer cells growing in the liver.
  hepatic artery: (heh-PA-tik AR-tuh-ree)
    Pronunciation of dictionary term "hepatic artery"
    The major blood vessel that carries blood to the liver.
  hepatic portal vein: (heh-PA-tik POR-tul vayn)
    Pronunciation of dictionary term "hepatic portal vein"
    A blood vessel that carries blood to the liver from the intestines, spleen, pancreas, and gallbladder. Also called portal vein.
  hepatic veno-occlusive disease: (heh-PA-tik VEE-noh-uh-KLOO-siv dih-ZEEZ)
    Pronunciation of dictionary term "hepatic veno-occlusive disease"
    A condition in which some of the veins in the liver are blocked. This causes a decrease in blood flow inside the liver and may lead to liver damage. Signs and symptoms include weight gain, yellowing of the skin and whites of the eyes, dark-colored urine, and increased liver size. It may occur at some point in time after radiation therapy to the liver and bile ducts or after high-dose anticancer drugs were given before a stem cell transplant. Also called sinusoidal obstruction syndrome.
  hepatitis: (HEH-puh-TY-tis)
    Pronunciation of dictionary term "hepatitis"
    Disease of the liver causing inflammation. Symptoms include an enlarged liver, fever, nausea, vomiting, abdominal pain, and dark urine.
  hepatitis A vaccine: (HEH-puh-TY-tis ... vak-SEEN)
    Pronunciation of dictionary term "hepatitis A vaccine"
    A vaccine used to prevent infection with the hepatitis A virus, which causes a serious liver disease. The vaccine is made of a weakened form of the virus that cannot cause disease but causes the body’s immune system to make antibodies that destroy the hepatitis A virus.
  hepatitis A virus: (HEH-puh-TY-tis ... VY-rus)
    Pronunciation of dictionary term "hepatitis A virus"
    A virus that causes a serious liver disease. It is usually spread by contact with an infected person’s stool by eating food he or she has handled after not washing hands, but it can be spread in other ways. Symptoms of infection include jaundice, dark urine, and fever and other flu-like symptoms.
  hepatitis B virus: (HEH-puh-TY-tis ... VY-rus)
    Pronunciation of dictionary term "hepatitis B virus"
    A virus that causes hepatitis (inflammation of the liver). It is carried and passed to others through the blood and other body fluids. Different ways the virus is spread include sharing needles with an infected person and being stuck accidentally by a needle contaminated with the virus. Infants born to infected mothers may also become infected with the virus. Although many patients who are infected with hepatitis B virus may not have symptoms, long-term infection may lead to cirrhosis (scarring of the liver) and liver cancer. Also called HBV.
  hepatitis C virus: (HEH-puh-TY-tis ... VY-rus)
    Pronunciation of dictionary term "hepatitis C virus"
    A virus that causes hepatitis (inflammation of the liver). It is carried and passed to others through the blood and other body fluids. Different ways the virus is spread include sharing needles with an infected person and being stuck accidentally by a needle contaminated with the virus. Infants born to infected mothers may also become infected with the virus. Although patients who are infected with hepatitis C virus may not have symptoms, long-term infection may lead to cirrhosis (scarring of the liver) and liver cancer. These patients may also have an increased risk for certain types of non-Hodgkin lymphoma. Also called HCV.
  hepatitis D virus: (HEH-puh-TY-tis … VY-rus)
    Pronunciation of dictionary term "hepatitis D virus"
    A type of hepatitis virus that may be present in the body at the same time as the hepatitis B virus. It makes the hepatitis (inflammation of the liver) caused by hepatitis B much worse. The hepatitis D virus and the hepatitis B virus are spread to others through blood or sexual contact. Infants born to infected mothers may also become infected with the virus. Also called hepatitis delta virus.
  hepatitis delta virus: (HEH-puh-TY-tis DEL-tuh VY-rus)
    Pronunciation of dictionary term "hepatitis delta virus"
    A type of hepatitis virus that may be present in the body at the same time as the hepatitis B virus. It makes the hepatitis (inflammation of the liver) caused by hepatitis B much worse. The hepatitis delta virus and the hepatitis B virus are spread to others through blood or sexual contact. Infants born to infected mothers may also become infected with the virus. Also called hepatitis D virus.
  hepatitis E virus: (HEH-puh-TY-tis … VY-rus)
    Pronunciation of dictionary term "hepatitis E virus"
    A virus that causes hepatitis (inflammation of the liver). It is usually spread through food that has been handled by an infected person, or through drinking water that is contaminated with human waste.
  hepatitis G virus: (HEH-puh-TY-tis … VY-rus)
    Pronunciation of dictionary term "hepatitis G virus"
    A virus that may be found in patients with hepatitis (inflammation of the liver). It is spread to others through blood or sexual contact. Infants born to infected mothers may also become infected with the virus.
  hepatobiliary: (heh-PA-toh-BIH-lee-AYR-ee)
    Pronunciation of dictionary term "hepatobiliary"
    Having to do with the liver, bile ducts, and/or gallbladder.
  hepatoblastoma: (HEH-puh-toh-bla-STOH-muh)
    Pronunciation of dictionary term "hepatoblastoma"
    A type of liver tumor that occurs in infants and children.
  hepatocellular carcinoma: (heh-PA-toh-SEL-yoo-ler KAR-sih-NOH-muh)
    Pronunciation of dictionary term "hepatocellular carcinoma"
    A type of cancer that forms in liver cells called hepatocytes. Hepatocytes are the most common cells of the liver, and they carry out most of the functions of the liver. Factors that may increase a person’s risk of developing hepatocellular carcinoma include having chronic infection with hepatitis B virus or hepatitis C virus, non-alcoholic steatohepatitis, chronic alcohol use disorder, and cirrhosis. Most adult primary liver cancers are hepatocellular carcinomas. Also called HCC.
  hepatocyte: (heh-PA-toh-site)
    Pronunciation of dictionary term "hepatocyte"
    A liver cell.
  hepatolenticular degeneration: (heh-PA-toh-len-TIH-kyoo-ler dee-JEH-neh-RAY-shun)
    Pronunciation of dictionary term "hepatolenticular degeneration"
    A rare, inherited disorder in which too much copper builds up in the body. The extra copper is stored in the body’s tissues and organs, especially in the liver, brain, and eyes. This can cause liver disease, central nervous system (brain and spinal cord) problems, and mental problems. Signs and symptoms of hepatolenticular degeneration include yellowing of the skin and the whites of the eyes, a gold or brown ring around the colored part of the eyes, swelling in the abdomen and legs, fatigue, loss of appetite, problems with speech and swallowing, uncontrolled movements or muscle stiffness, anxiety, depression, and mood swings. Hepatolenticular degeneration is caused by mutations (changes) in the ATP7B gene. It is a genetic disorder that is inherited in an autosomal recessive manner and is usually diagnosed in teens and young adults. It is a type of copper storage disease. Also called Wilson disease.
    More Information
    - Wilson disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7893/wilson-disease)
    - Wilson disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/wilson-disease/)
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  hepatoma: (HEH-puh-TOH-muh)
    Pronunciation of dictionary term "hepatoma"
    A liver tumor.
  hepatomegaly: (HEH-puh-toh-MEH-guh-lee)
    Pronunciation of dictionary term "hepatomegaly"
    Enlarged liver.
  Hepzato: (hep-ZA-toh)
    Pronunciation of dictionary term "Hepzato"
    A drug that contains the active ingredient melphalan hydrochloride and is used to treat adults with uveal melanoma (a type of eye cancer) that has spread to less than half of the liver and cannot be removed by surgery. Hepzato is given as an infusion directly into an artery that leads to the liver. It may kill cancer cells by damaging their DNA and stopping them from dividing. Hepzato is a type of alkylating agent.
    More Information
    - Melphalan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalan-hydrochloride)
  HER1: A protein found on certain types of cells that binds to a substance called epidermal growth factor. The HER1 protein is involved in cell signaling pathways that control cell division and survival. Sometimes, mutations (changes) in the EGFR gene cause HER1 proteins to be made in higher than normal amounts on some types of cancer cells. This causes cancer cells to divide more rapidly. Drugs that block HER1 proteins are being used in the treatment of some types of cancer. HER1s are a type of receptor tyrosine kinase. Also called EGFR, epidermal growth factor receptor, and ErbB1.
  HER1 gene: A gene that makes a protein that is involved in cell growth and cell survival. Mutated (changed) forms of the HER1 gene and protein have been found in some types of cancer, including non-small cell lung cancer. These changes may cause cancer cells to grow and spread in the body. Checking for changes in the HER1 gene in tumor tissue may help plan cancer treatment. Also called EGFR gene, epidermal growth factor receptor gene, and ERBB1 gene.
  HER2: A protein involved in normal cell growth. HER2 may be made in larger than normal amounts by some types of cancer cells, including breast, ovarian, bladder, pancreatic, stomach, and esophageal cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. Checking the amount of HER2 on some types of cancer cells may help plan treatment. Also called c-erbB-2, HER2/neu, human EGF receptor 2, and human epidermal growth factor receptor 2.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  HER2 negative: (… NEH-guh-tiv)
    Pronunciation of dictionary term "HER2 negative"
    Describes cells that have a small amount or none of a protein called HER2 on their surface. In normal cells, HER2 helps control cell growth. Cancer cells that are HER2 negative may grow more slowly and are less likely to recur (come back) or spread to other parts of the body than cancer cells that have a large amount of HER2 on their surface. Checking to see if a cancer is HER2 negative may help plan treatment. Cancers that may be HER2 negative include breast, bladder, ovarian, pancreatic, and stomach cancers. Also called human epidermal growth factor receptor 2 negative.
  HER2 positive: (… PAH-zih-tiv)
    Pronunciation of dictionary term "HER2 positive"
    Describes cells that have a protein called HER2 on their surface. In normal cells, HER2 helps control cell growth. Cancer cells that make too much HER2 may grow more quickly and are more likely to spread to other parts of the body. Checking to see if a cancer is HER2 positive may help plan treatment, which may include drugs that kill HER2-positive cancer cells. Cancers that may be HER2 positive include breast, bladder, pancreatic, ovarian, and stomach cancers. Also called c-erbB-2 positive and human epidermal growth factor receptor 2 positive.
  HER2 test: A laboratory test that measures the amount of HER2 protein on cancer cells or how many copies of the HER2 gene are in the DNA of cancer cells. The HER2 protein helps control normal cell growth. Larger than normal amounts of the HER2 protein or too many copies of the HER2 gene may be made by some types of cancer, including breast, ovarian, bladder, pancreatic, and stomach cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. A HER2 test may be done to help plan treatment, which may include drugs that target the HER2 protein. It is a type of tumor marker test. Also called HER2/neu test and human epidermal growth factor receptor 2 test.
  HER2-low breast cancer: (… brest KAN-ser)
    Pronunciation of dictionary term "HER2-low breast cancer"
    A type of breast cancer in which the cancer cells have a small amount of a protein called HER2 on their surface and do not have more than two copies of the HER2 gene. HER2-low breast cancer has usually been treated like HER2-negative breast cancer because the cancer cells do not make enough HER2 protein for drugs that target HER2 to work. However, newer drugs that target HER2 have been shown to be effective in treating HER2-low breast cancer.
  HER2/neu: A protein involved in normal cell growth. HER2/neu may be made in larger than normal amounts by some types of cancer cells, including breast, ovarian, bladder, pancreatic, stomach, and esophageal cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. Checking the amount of HER2/neu on some types of cancer cells may help plan treatment. Also called c-erbB-2, HER2, human EGF receptor 2, and human epidermal growth factor receptor 2.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  HER2/neu test: A laboratory test that measures the amount of HER2/neu protein on cancer cells or how many copies of the HER2/neu gene are in the DNA of cancer cells. The HER2/neu protein helps control normal cell growth. Larger than normal amounts of the HER2/neu protein or too many copies of the HER2/neu gene may be made by some types of cancer, including breast, ovarian, bladder, pancreatic, and stomach cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. A HER2/neu test may be done to help plan treatment, which may include drugs that target the HER2/neu protein. It is a type of tumor marker test. Also called HER2 test and human epidermal growth factor receptor 2 test.
  herba Scutellaria barbatae: (ER-buh skoo-teh-LAYR-ee-uh BAR-buh-tay)
    Pronunciation of dictionary term "herba Scutellaria barbatae"
    An herb used in traditional Chinese medicine to treat certain medical problems. It may have anticancer effects.
  herbal: (ER-bul)
    Pronunciation of dictionary term "herbal"
    Having to do with plants.
  herbal cigarette: (ER-bul SIH-guh-ret)
    Pronunciation of dictionary term "herbal cigarette"
    A type of cigarette that contains a mixture of flowers, herbs, and other natural ingredients. Herbal cigarettes do not contain tobacco or nicotine. When they are smoked, they make many of the same harmful chemicals found in tobacco smoke, including tar and carbon monoxide.
  herbal medicine: (ER-bul MEH-dih-sin)
    Pronunciation of dictionary term "herbal medicine"
    A type of medicine that uses roots, stems, leaves, flowers, or seeds of plants to improve health, prevent disease, and treat illness.
  herbal supplement: (ER-bul SUH-pleh-ment)
    Pronunciation of dictionary term "herbal supplement"
    A product made from a plant that is thought to be useful in treating disease or staying healthy. Herbal supplements are taken by mouth.
  herbicide: (ER-bih-side)
    Pronunciation of dictionary term "herbicide"
    A chemical that kills plants.
  Herceptin: (her-SEP-tin)
    Pronunciation of dictionary term "Herceptin"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Herceptin binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Herceptin is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Hercessi, Herzuma, Kanjinti, Ogivri, Ontruzant, trastuzumab, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  Herceptin Hylecta: (her-SEP-tin hy-LEK-tuh)
    Pronunciation of dictionary term "Herceptin Hylecta"
    A combination of trastuzumab and hyaluronidase used alone or with other drugs to treat adults with certain types of HER2-positive breast cancer. Trastuzumab binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Hyaluronidase allows trastuzumab to be given by injection under the skin. Herceptin Hylecta can be given in less time than trastuzumab alone, which is given as an infusion. Also called trastuzumab and hyaluronidase.
    More Information
    - Trastuzumab and Hyaluronidase-oysk (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumabandhyaluronidase-oysk)
  Hercessi: (her-SEH-see)
    Pronunciation of dictionary term "Hercessi"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Hercessi binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Hercessi is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Herzuma, Kanjinti, Ogivri, Ontruzant, trastuzumab, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  herd immunity: (… ih-MYOO-nih-tee)
    Pronunciation of dictionary term "herd immunity"
    Protection from an infectious disease as a result of living in a community where a large number of people are vaccinated against that disease. When enough people are vaccinated against a disease, it is harder for the disease to spread. Herd immunity helps protect those who have not been vaccinated, including newborns, pregnant women, and people with certain illnesses who cannot receive vaccines. Also called community immunity.
  hereditary: (heh-REH-dih-tayr-ee)
    Pronunciation of dictionary term "hereditary"
    In medicine, describes the passing of genetic information from parent to child through the genes in sperm and egg cells. Also called inherited.
  hereditary breast and ovarian cancer syndrome: (heh-REH-dih-tayr-ee brest … oh-VAYR-ee-un KAN-ser SIN-drome)
    Pronunciation of dictionary term "hereditary breast and ovarian cancer syndrome"
    An inherited disorder in which the risk of breast cancer (especially before the age of 50) and ovarian cancer is higher than normal. Most cases of hereditary breast and ovarian cancer syndrome are caused by certain mutations (changes) in the BRCA1 or the BRCA2 gene. People with hereditary breast and ovarian cancer syndrome may also have an increased risk of other types of cancer, including pancreatic cancer, prostate cancer, and melanoma. Also called HBOC syndrome.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - BRCA1 hereditary breast and ovarian cancer syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/12351/brca1-hereditary-breast-and-ovarian-cancer-syndrome)
    - BRCA2 hereditary breast and ovarian cancer syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/12352/brca2-hereditary-breast-and-ovarian-cancer-syndrome)
  hereditary cancer syndrome: (heh-REH-dih-tayr-ee KAN-ser SIN-drome)
    Pronunciation of dictionary term "hereditary cancer syndrome"
    A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Hereditary cancer syndromes are caused by mutations (changes) in certain genes passed from parents to children. In a hereditary cancer syndrome, certain patterns of cancer may be seen within families. These patterns include having several close family members (such as a mother, daughter, and sister) with the same type of cancer, developing cancer at an early age, or having two or more types of cancer develop in the same person. Examples of hereditary cancer syndromes are hereditary breast and ovarian cancer syndrome, Li-Fraumeni syndrome, Cowden syndrome, and Lynch syndrome. Also called family cancer syndrome and inherited cancer syndrome.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  hereditary diffuse gastric cancer: (heh-REH-dih-tayr-ee dih-FYOOS GAS-trik KAN-ser)
    Pronunciation of dictionary term "hereditary diffuse gastric cancer"
    A rare, inherited disorder that increases the risk of developing a type of stomach cancer called diffuse gastric cancer. This cancer grows in the lining of the stomach, which causes the lining to become thick and hard. The cancer is also likely to spread to other parts of the body, such as the liver or bone. Women with hereditary diffuse gastric cancer also have an increased risk of developing a type of breast cancer that begins in the lobules (milk glands) of the breast. Hereditary diffuse gastric cancer is usually caused by mutations (changes) in the CDH1 gene that are inherited in an autosomal dominant manner. It is a type hereditary cancer syndrome. Also called familial diffuse gastric cancer and HDGC.
    More Information
    - Hereditary diffuse gastric cancer (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10900/hereditary-diffuse-gastric-cancer)
    - Hereditary diffuse gastric cancer (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-diffuse-gastric-cancer/)
  hereditary hemochromatosis: (heh-REH-dih-tayr-ee HEE-moh-kroh-muh-TOH-sis)
    Pronunciation of dictionary term "hereditary hemochromatosis"
    An inherited condition in which too much iron builds up in the body. The extra iron is stored in the body’s tissues and organs, especially the liver, heart, pancreas, skin, and joints. This can cause liver disease, heart problems, diabetes, and organ failure. Symptoms include changes in skin color, pain in the joints and abdomen, fatigue, and loss of sex drive. Patients with hereditary hemochromatosis also have an increased risk of liver cancer. There are five types of hereditary hemochromatosis. Each type is caused by changes in different genes. Symptoms for each type typically begin at different ages. Type 1 hemochromatosis is one of the most common genetic disorders in the United States.
    More Information
    - Hereditary hemochromatosis (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-hemochromatosis/)
    - Hemochromatosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10746/hemochromatosis)
  hereditary leiomyomatosis and renal cell cancer: (heh-REH-dih-tayr-ee LY-oh-MY-oh-muh-TOH-sis ... REE-nul sel KAN-ser)
    Pronunciation of dictionary term "hereditary leiomyomatosis and renal cell cancer"
    A rare, inherited disorder in which benign (not cancer) skin lesions called leiomyomas form in the smooth muscle tissue around the hair follicles. They usually form on the arms, legs, chest, and abdomen. Benign leiomyomas may also form as fibroids in the uterus in females. People with hereditary leiomyomatosis and renal cell cancer have an increased risk of kidney cancer. The signs and symptoms of hereditary leiomyomatosis and renal cell cancer usually do not appear until young adulthood. Hereditary leiomyomatosis and renal cell cancer is caused by a mutation in the FH gene. It is inherited in an autosomal dominant manner. Also called HLRCC.
    More Information
    - Hereditary leiomyomatosis and renal cell cancer (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10096/hereditary-leiomyomatosis-and-renal-cell-cancer)
    - Hereditary leiomyomatosis and renal cell cancer (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-leiomyomatosis-and-renal-cell-cancer/)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    Areas of the body affected by hereditary leiomyomatosis and renal cell cancer (HLRCC). HLRCC is an inherited disorder that causes an increased risk of kidney cancer. It can also cause lesions in the skin and uterus (in females).
    Drawing showing areas of the body affected by hereditary leiomyomatosis and renal cell cancer, including the skin, kidneys, and uterus.
  hereditary mutation: (heh-REH-dih-tayr-ee myoo-TAY-shun)
    Pronunciation of dictionary term "hereditary mutation"
    A gene change in a body's reproductive cell (egg or sperm) that becomes incorporated into the DNA of every cell in the body of the offspring. Hereditary mutations are passed on from parents to offspring. Also called germline mutation.
  hereditary nonpolyposis colorectal cancer: (heh-REH-dih-tayr-ee non-PAH-lee-POH-sis KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "hereditary nonpolyposis colorectal cancer"
    An inherited disorder that increases the risk of developing colorectal cancer, endometrial cancer, ovarian cancer, and many other types of cancer, such as cancers of the stomach, small intestine, pancreas, bile duct, urinary tract, and brain, often before age 50. Hereditary nonpolyposis colorectal cancer is caused by mutations (changes) in genes that affect DNA mismatch repair, a process that fixes mistakes that occur when DNA is copied. These genes are MLH1, MSH2, MSH6, PMS2, and EPCAM. Also called HNPCC and Lynch syndrome.
    More Information
    - Lynch syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/lynch-syndrome/)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  hereditary papillary renal cancer: (heh-REH-dih-tayr-ee PA-pih-LAYR-ee REE-nul KAN-ser)
    Pronunciation of dictionary term "hereditary papillary renal cancer"
    A rare, inherited disorder that increases the risk of a type of kidney cancer called type 1 papillary kidney cancer. This cancer forms in cells that line the small tubes in the kidney that filter waste from the blood and make urine. Hereditary papillary renal cancer often affects both kidneys, and often there is more than one tumor in each kidney. It is caused by mutations (changes) in a gene called MET. Hereditary papillary renal cancer is a type of hereditary cancer syndrome. Also called hereditary papillary renal carcinoma and HPRC.
    More Information
    - Papillary renal cell carcinoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.
    Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.
  hereditary papillary renal carcinoma: (heh-REH-dih-tayr-ee PA-pih-LAYR-ee REE-nul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "hereditary papillary renal carcinoma"
    A rare, inherited disorder that increases the risk of a type of kidney cancer called type 1 papillary kidney cancer. This cancer forms in cells that line the small tubes in the kidney that filter waste from the blood and make urine. Hereditary papillary renal carcinoma often affects both kidneys, and often there is more than one tumor in each kidney. It is caused by mutations (changes) in a gene called MET. Hereditary papillary renal carcinoma is a type of hereditary cancer syndrome. Also called hereditary papillary renal cancer and HPRC.
    More Information
    - Papillary renal cell carcinoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.
    Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.
  hereditary paraganglioma-pheochromocytoma syndrome: (heh-REH-dih-tayr-ee PAYR-uh-GANG-glee-OH-muh-FEE-oh-KROH-moh-sy-TOH-muh SIN-drome)
    Pronunciation of dictionary term "hereditary paraganglioma-pheochromocytoma syndrome"
    A rare, genetic disorder marked by tumors called paragangliomas, which are found in paraganglia. Paraganglia are groups of nerve-like cells found near the adrenal glands and near blood vessels or nerves in the head, neck, chest, abdomen, and pelvis. Paragangliomas that form in the adrenal glands are called pheochromocytomas. Paragangliomas are usually benign (not cancer), but sometimes become malignant (cancerous). People with hereditary paraganglioma-pheochromocytoma syndrome usually have more than one paraganglioma, and may have an increased risk of certain types of cancer, such as kidney cancer and thyroid cancer.
    More Information
    - Hereditary paraganglioma-pheochromocytoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/11984/hereditary-paraganglioma-pheochromocytoma)
    - Hereditary paraganglioma-pheochromocytoma (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-paraganglioma-pheochromocytoma/)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  hereditary predisposition: (heh-REH-dih-tayr-ee PREE-dih-spuh-ZIH-shun)
    Pronunciation of dictionary term "hereditary predisposition"
    An inherited increase in the risk of developing a disease. Also called genetic predisposition, genetic susceptibility, and inherited predisposition.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  hereditary syndrome: (heh-REH-dih-tayr-ee SIN-drome)
    Pronunciation of dictionary term "hereditary syndrome"
    A disorder caused by mutations (changes) in certain genes or chromosomes that are passed down from parent to child. Hereditary syndromes may be inherited from one or both parents, and several close family members (such as a mother, daughter, and sister) may have the same disorder. There are many different types of hereditary syndromes, including those in which family members have a higher-than-normal risk of developing certain types of cancer.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  heritable: (HAYR-ih-tuh-bul)
    Pronunciation of dictionary term "heritable"
    In medicine, describes a characteristic or trait that can be passed from a parent to a child through the genes. Several types of cancer have heritable forms, in which the risk of developing a particular type of cancer is inherited from a parent. Some signs of heritable cancer are a family history of the cancer, mutations (changes) in certain genes passed from a parent to a child, or a mutation that occurs at the time of conception (fertilization of an egg by a sperm). Heritable forms of cancer often develop at an early age.
  heritage: (HAYR-ih-tij)
    Pronunciation of dictionary term "heritage"
    Something handed down from the past, such as a tradition, birthright, or inherited traits.
  hernia: (HER-nee-uh)
    Pronunciation of dictionary term "hernia"
    The bulging of an internal organ through a weak area or tear in the muscle or other tissue that holds it in place. Most hernias occur in the abdomen.
  heroin: (HAYR-oh-win)
    Pronunciation of dictionary term "heroin"
    A highly addictive substance once used to treat severe pain but is now illegal to use or sell in the United States. It is made from morphine, a natural substance found in the seed pods of the opium poppy plant. Heroin works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and changes how the body responds to pain. It is a type of analgesic (pain reliever) and a type of opiate. Also called diacetylmorphine and diamorphine.
  herpes simplex virus: (HER-peez SIM-plex VY-rus)
    Pronunciation of dictionary term "herpes simplex virus"
    A type of virus that causes herpes infections and has DNA as its genetic material. There are two types of herpes simplex viruses. Infections with type 1 viruses cause cold sores on the lips or nostrils. Infections with type 2 viruses cause sores on the genitals (external and internal sex organs and glands). Also called HHV, HSV, and human herpesvirus.
  herpes zoster: (HER-peez ZOS-ter)
    Pronunciation of dictionary term "herpes zoster"
    A common condition that occurs when the virus that causes chickenpox is reactivated in the body. After having chickenpox, the virus stays inactive in the body, usually in the nerves along the spinal cord or at the base of the skull. The virus can become active again many years later and cause herpes zoster. Herpes zoster is marked by a painful rash that usually appears as small clusters of blisters. The blisters often form a band across the skin on one side of the body, especially on the chest, back, waist, or face. The pain in the affected area can last for many weeks or months after the rash disappears. Other symptoms may include fever, chills, headache, fatigue, and upset stomach. Herpes zoster is most common in older adults and in those who have a weakened immune system. It cannot be passed from person to person, but those who have never had chickenpox or the chickenpox vaccine can develop chickenpox if they come in contact with a person who has herpes zoster. Vaccines are available to prevent herpes zoster. Also called shingles.
  herpesvirus: (HER-peez-VY-rus)
    Pronunciation of dictionary term "herpesvirus"
    A member of the herpes family of viruses.
  Herzuma: (her-ZOO-muh)
    Pronunciation of dictionary term "Herzuma"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Herzuma binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Herzuma is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Hercessi, Kanjinti, Ogivri, Ontruzant, trastuzumab, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  heterocyclic amine: (HEH-teh-roh-SY-klik A-meen)
    Pronunciation of dictionary term "heterocyclic amine"
    A chemical that is formed when meat, poultry, or fish is cooked at high temperatures, such as frying, broiling, and barbecuing. Heterocyclic amines are carcinogens (substances that may cause cancer). Also called HCA.
    More Information
    - Chemicals in Meat Cooked at High Temperatures and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/cooked-meats-fact-sheet)
  heterogeneous: (HEH-teh-roh-JEE-nee-us)
    Pronunciation of dictionary term "heterogeneous"
    Made up of elements or ingredients that are not alike.
  heterogeneously dense breast tissue: (HEH-teh-roh-JEE-nee-us-lee dents brest TIH-shoo)
    Pronunciation of dictionary term "heterogeneously dense breast tissue"
    A term used to describe breast tissue that has large areas of dense fibrous tissue and glandular tissue and also has some fatty tissue. The dense areas of the breast make it harder to find tumors or other changes on a mammogram. Heterogeneously dense breast tissue is one of four categories used to describe a level of breast density seen on a mammogram. About 40% of women have this type of breast tissue.
  heterogenic: (HEH-teh-roh-JEH-nik)
    Pronunciation of dictionary term "heterogenic"
    Derived from a different source or species. Also called heterogenous.
  heterogenous: (HEH-teh-RAH-jeh-nus)
    Pronunciation of dictionary term "heterogenous"
    Derived from a different source or species. Also called heterogenic.
  heterozygous genotype: (HEH-teh-roh-ZY-gus JEE-noh-tipe)
    Pronunciation of dictionary term "heterozygous genotype"
    A term that describes having two different versions of the same gene (one inherited from the mother and one inherited from the father). In a heterozygous genotype, each gene may have a different mutation (change) or one of the genes may be mutated and the other one is normal. For example, familial hypercholesterolemia (very high levels of cholesterol in the blood) can occur when a person is heterozygous for the LDLR gene, inheriting a mutated gene from one parent and a normal gene from the other parent.
    More Information
    - Heterozygous (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=101)
  hexyl 5-aminolevulinate: (HEK-sul 5-uh-MEE-noh-LEH-vyoo-LIH-nayt)
    Pronunciation of dictionary term "hexyl 5-aminolevulinate"
    A substance that is used to find and kill tumor cells. It enters tumor cells and becomes activated when exposed to a special type of light. A chemical reaction causes the cells to produce fluorescent light and die.
  HGS-ETR1: A substance being studied in the treatment of some types of cancer. It binds to a protein called TRAIL R1 on the surface of some tumor cells. This may kill the tumor cells. HGS-ETR1 is a type of monoclonal antibody. Also called anti-TRAIL R1-mAb and mapatumumab.
  HGS-ETR2: A substance being studied in the treatment of some types of cancer. It binds to a protein called TRAIL-R2 on the surface of some tumor cells, which may kill the tumor cells. HGS-ETR2 is a type of monoclonal antibody. Also called anti-TRAIL R2 mAb HGS-ETR2 and lexatumumab.
  HHS: The U.S. federal government agency responsible for protecting the public’s health and providing important services, especially for people in need. The HHS works with state and local governments throughout the country to do research and provide public health services, food and drug safety programs, health insurance programs, and many other services. There are several federal agencies that are a part of the HHS. They include the Food and Drug Administration (FDA), the Centers for Disease Control and Prevention (CDC), the National Institutes of Health (NIH), and the Centers for Medicare and Medicaid Services (CMMS). Also called Department of Health and Human Services and DHHS.
    More Information
    - U.S. Department of Health and Human Services (https://www.hhs.gov/)
  HHV: A type of virus that causes herpes infections and has DNA as its genetic material. There are two types of HHVs. Infections with type 1 viruses cause cold sores on the lips or nostrils. Infections with type 2 viruses cause sores on the genitals (external and internal sex organs and glands). Also called herpes simplex virus, HSV, and human herpesvirus.
  HHV8: A type of virus that causes Kaposi sarcoma (a rare cancer in which lesions grow in the skin, lymph nodes, lining of the mouth, nose, and throat, and other tissues of the body). HHV8 also causes certain types of lymphoma (cancer that begins in cells of the immune system). Also called human herpesvirus 8, Kaposi sarcoma-associated herpesvirus, and KSHV.
  HIF: One of a group of proteins that play an important role in how cells respond to changing levels of oxygen. When oxygen levels in cells are low, HIFs activate certain genes involved in cell growth and survival. This allows the cells to function and survive even in low oxygen conditions. HIFs may be made in larger than normal amounts by some types of cancer cells. This may cause cancer cells to grow and spread to other parts of the body. Also called hypoxia-inducible factor.
  HIFU: A procedure in which high-energy sound waves are aimed directly at an area of abnormal cells or tissue in the body. The waves create heat that kills the cells. HIFU is being studied in the treatment of prostate cancer and some other types of cancer and other diseases. Also called high-intensity focused ultrasound therapy.
  high blood pressure: (hy blud PREH-sher)
    Pronunciation of dictionary term "high blood pressure"
    A blood pressure of 140/90 or higher. High blood pressure usually has no symptoms. It can harm the arteries and cause an increase in the risk of stroke, heart attack, kidney failure, and blindness. Also called hypertension.
  high blood sugar: (hy blud SHUH-ger)
    Pronunciation of dictionary term "high blood sugar"
    Higher than normal amount of glucose (a type of sugar) in the blood. High blood sugar can be a sign of diabetes or other conditions. Also called hyperglycemia.
  high grade: (hy grayd)
    Pronunciation of dictionary term "high grade"
    A term used to describe cells and tissue that look abnormal under a microscope. High-grade cancer cells tend to grow and spread more quickly than low-grade cancer cells. Cancer grade may be used to help plan treatment and determine prognosis. High-grade cancers usually have a worse prognosis than low-grade cancers and may need treatment right away or treatment that is more aggressive (intensive).
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  high-dose chemotherapy: (hy-dose kee-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "high-dose chemotherapy"
    An intensive drug treatment to kill cancer cells, but that also destroys the bone marrow and can cause other severe side effects. High-dose chemotherapy is usually followed by bone marrow or stem cell transplantation to rebuild the bone marrow.
  high-dose radiation: (hy-dose RAY-dee-AY-shun)
    Pronunciation of dictionary term "high-dose radiation"
    An amount of radiation that is greater than that given in typical radiation therapy. High-dose radiation is precisely directed at the tumor to avoid damaging healthy tissue, and may kill more cancer cells in fewer treatments. Also called HDR.
  high-dose-rate remote brachytherapy: (hy-dose-rayt ree-MOTE BRAY-kee-THAYR-uh-pee)
    Pronunciation of dictionary term "high-dose-rate remote brachytherapy"
    A type of internal radiation treatment in which the radioactive source is removed between treatments. Also called high-dose-rate remote radiation therapy and remote brachytherapy.
  high-dose-rate remote radiation therapy: (hy-dose-rayt ree-MOTE RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "high-dose-rate remote radiation therapy"
    A type of internal radiation treatment in which the radioactive source is removed between treatments. Also called high-dose-rate remote brachytherapy and remote brachytherapy.
  high-energy photon therapy: (hy-EH-ner-jee FOH-ton THAYR-uh-pee)
    Pronunciation of dictionary term "high-energy photon therapy"
    A type of radiation therapy that uses high-energy photons (units of light energy). High-energy photons penetrate deeply into tissues to reach tumors while giving less radiation to superficial tissues such as the skin.
  high-grade DCIS: (hy-grayd …)
    Pronunciation of dictionary term "high-grade DCIS"
    A condition in which cells that look very different from normal cells under a microscope are found in the lining of a breast duct. There may also be areas of dead cells in the abnormal tissue. The abnormal cells have not spread outside the duct to other tissues in the breast. High-grade DCIS tends to grow more quickly than low-grade or intermediate-grade DCIS and is more likely to come back or become invasive breast cancer and spread to other tissues. Also called grade III DCIS, grade III ductal carcinoma in situ, and high-grade ductal carcinoma in situ.
  high-grade ductal carcinoma in situ: (hy-grayd DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "high-grade ductal carcinoma in situ"
    A condition in which cells that look very different from normal cells under a microscope are found in the lining of a breast duct. There may also be areas of dead cells in the abnormal tissue. The abnormal cells have not spread outside the duct to other tissues in the breast. High-grade ductal carcinoma in situ tends to grow more quickly than low-grade or intermediate-grade ductal carcinoma in situ and is more likely to come back or become invasive breast cancer and spread to other tissues. Also called grade III DCIS, grade III ductal carcinoma in situ, and high-grade DCIS.
  high-grade lymphoma: (... lim-FOH-muh)
    Pronunciation of dictionary term "high-grade lymphoma"
    A type of lymphoma that grows and spreads quickly and has severe symptoms. Also called aggressive lymphoma and intermediate-grade lymphoma.
  high-grade squamous intraepithelial lesion: (... SKWAY-mus IN-truh-eh-pih-THEE-lee-ul LEE-zhun)
    Pronunciation of dictionary term "high-grade squamous intraepithelial lesion"
    An area of abnormal cells that forms on the surface of certain organs, such as the cervix, vagina, vulva, anus, and esophagus. High-grade squamous intraepithelial lesions look somewhat to very abnormal when looked at under a microscope. They are usually caused by chronic infection with certain types of human papillomavirus (HPV) and are found when a Pap test or biopsy is done. If not treated, these abnormal cells may become cancer and spread into nearby tissue. A high-grade squamous intraepithelial lesion is sometimes called moderate or severe dysplasia. Also called HSIL.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
    Cervical changes. The cervix is the lower, narrow end of the uterus that forms a canal between the uterus and vagina. Before cancer cells form in tissues of the cervix, the cells of the cervix go through abnormal changes called dysplasia. There are different types of dysplasia. Mild dysplasia, called low-grade intraepithelial lesion (LSIL) is one type. Moderate or severe dysplasia, called high-grade intraepithelial lesion (HSIL) is another type of dysplasia. LSIL and HSIL may or may not become cancer.
    Cervical changes; drawing shows a cross-section of the uterus, cervix, and vagina. Also shown are four panels showing cell changes inside the cervix. The first panel shows normal cells. The second and third panels show abnormal cells called LSIL and HSIL. The fourth panel shows cervical cancer cells. Arrows are used between the panels to show that normal cells may become LSIL or HSIL, which may or may not become cancer.
  high-intensity focused ultrasound therapy: (hy-in-TEN-sih-tee FOH-kust UL-truh-sownd THAYR-uh-pee)
    Pronunciation of dictionary term "high-intensity focused ultrasound therapy"
    A procedure in which high-energy sound waves are aimed directly at an area of abnormal cells or tissue in the body. The waves create heat that kills the cells. High-intensity focused ultrasound therapy is being studied in the treatment of prostate cancer and some other types of cancer and other diseases. Also called HIFU.
  high-resolution micro-ultrasound: (hy-reh-zuh-LOO-shun MY-kroh-UL-truh-sownd)
    Pronunciation of dictionary term "high-resolution micro-ultrasound"
    A procedure that uses high-energy sound waves to create pictures of the prostate and surrounding tissue that are much more detailed than standard ultrasound. This makes it easier to see a suspicious or abnormal area of the prostate and determine if a biopsy is needed. High-resolution micro-ultrasound may also be used during a biopsy to help guide the removal of a sample of abnormal prostate tissue. It may be used to help diagnose prostate cancer, monitor prostate cancer growth over time, and plan treatment.
  high-risk cancer: (hy-risk KAN-ser)
    Pronunciation of dictionary term "high-risk cancer"
    Cancer that is likely to recur (come back), or spread.
  high-risk HPV: (hy-risk …)
    Pronunciation of dictionary term "high-risk HPV"
    A group of cancer-causing human papillomaviruses (HPV). These viruses can infect the cells on the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat. A long-lasting infection with a high-risk HPV type can cause cell changes that become cancer over time if not found and removed. High-risk HPV can cause cancers of the cervix, anus, oropharynx, vagina, vulva, and penis. There are about 12 types of high-risk HPV, but HPV types 16 and 18 cause most HPV-related cancers. High-risk HPV is transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. Also called high-risk human papillomavirus.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  high-risk human papillomavirus: (hy-risk HYOO-mun PA-pih-LOH-muh-VY-rus)
    Pronunciation of dictionary term "high-risk human papillomavirus"
    A group of cancer-causing human papillomaviruses (HPV). These viruses can infect the cells on the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat. A long-lasting infection with a high-risk human papillomavirus type can cause cell changes that become cancer over time if not found and removed. High-risk human papillomavirus can cause cancers of the cervix, anus, oropharynx, vagina, vulva, and penis. There are about 12 types of high-risk human papillomavirus, but HPV types 16 and 18 cause most HPV-related cancers. High-risk human papillomavirus is transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. Also called high-risk HPV.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  high-selenium Brassica juncea: (hy-seh-LEE-nee-um BRA-sih-kuh JUN-see-uh)
    Pronunciation of dictionary term "high-selenium Brassica juncea"
    Brassica juncea that has been grown in high levels of selenium. Brassica juncea is a plant of the cabbage family that has been used in some cultures to treat certain medical problems, including arthritis, colds, stomach disorders, and tumors. The plant stores minerals, including selenium which may stop tumor cells from growing. High-selenium Brassica juncea is being studied in the treatment of cancer. Brassica juncea is also known as Indian mustard.
  highly active antiretroviral therapy: (...AN-tee-REH-troh-VY-rul THAYR-uh-pee)
    Pronunciation of dictionary term "highly active antiretroviral therapy"
    Treatment that uses a combination of three or more drugs to treat HIV infection. Highly active antiretroviral therapy stops the virus from making copies of itself in the body. This may lessen the damage to the immune system caused by HIV and may slow down the development of AIDS. It may also help prevent transmission of HIV to others, including from mother to child during birth. Also called cART, combination antiretroviral therapy, and HAART.
  hilar: (HY-ler)
    Pronunciation of dictionary term "hilar"
    Refers to the area where nerves and blood vessels attach to an organ.
  HIPAA: (HIH-puh)
    Pronunciation of dictionary term "HIPAA"
    A 1996 U.S. law that allows workers and their families to keep their health insurance when they change or lose their jobs. The privacy rule of the HIPAA protects the privacy of a person’s health information and keeps it from being misused. It gives people the right to receive and review their health records and to choose with whom their health care providers and health insurance companies share their information (including friends, family members, and caregivers). The law also includes standards for setting up and maintaining secure electronic health records. Also called Health Insurance Portability and Accountability Act and Kassebaum Kennedy Act.
  HIPEC: A treatment used during surgery in which a heated solution containing anticancer drugs is infused directly into the abdominal cavity through a thin tube. After removal of as much tumor tissue as possible with surgery, HIPEC is given to kill any remaining tumor cells. It is most often used to treat cancers that have spread to the peritoneum (the lining of the abdominal cavity). Also called CHPP, continuous hyperthermic peritoneal perfusion, and hyperthermic intraperitoneal chemotherapy.
  Hirschsprung disease: (HIRSH-sprung dih-ZEEZ)
    Pronunciation of dictionary term "Hirschsprung disease"
    A condition in which certain nerve cells are missing from the muscle layers of part of the large intestine. This causes severe constipation or blockage of the large intestine. Constipation is when stool becomes hard, dry, and difficult to pass and bowel movements occur less often than normal. Other symptoms include swollen abdomen, vomiting, bloody diarrhea, gas, lack of energy, and trouble gaining weight. Hirschsprung disease is present from birth, but the symptoms may not appear until later in a child’s life. This condition has been linked to an increased risk of thyroid cancer and neuroblastoma. Also called aganglionic megacolon.
    More Information
    - Hirschsprung disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6660/hirschsprungs-disease)
    - Hirschsprung disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/hirschsprung-disease/)
  histamine: (HIS-tuh-meen)
    Pronunciation of dictionary term "histamine"
    A substance that has many effects in the body. It is released from some types of white blood cells during allergic reactions. It causes small blood vessels to dilate (widen) and become leaky, which can cause tissues to swell. It also causes smooth muscles to contract, gastric acid to be made, and the heart rate to increase. Histamine is used in tests for allergies, asthma, and gastric acid secretion. It is a type of neurotransmitter.
  histamine dihydrochloride: (HIS-tuh-meen dy-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "histamine dihydrochloride"
    A substance being studied in the treatment of some types of cancer and other conditions. When used together with interleukin-2, histamine dihydrochloride may help some immune cells find and kill tumor cells. It is a type of biological response modifier. Also called Maxamine.
  histiocytic neoplasm: (HIS-tee-oh-SIH-tik NEE-oh-PLA-zum)
    Pronunciation of dictionary term "histiocytic neoplasm"
    A group of rare disorders in which too many histiocytes (a type of white blood cell) build up in certain tissues and organs, including the skin, bones, spleen, liver, lungs, and lymph nodes. This can cause damage to tissue or tumors to form in one or more parts of the body. The tumor may be benign (not cancer) or malignant (cancer). There are different types of histiocytic neoplasms, including Langerhans cell histiocytosis (LCH), hemophagocytic lymphohistiocytosis (HLH), and malignant histiocytic disorders. Histiocytic neoplasms occur most often in children, but can occur at any age. Also called histiocytosis.
  histiocytoid hemangioma: (HIS-tee-oh-SY-toyd hee-MAN-jee-OH-muh)
    Pronunciation of dictionary term "histiocytoid hemangioma"
    A rare benign (not cancer) tumor of small blood vessels surrounded by lymphocytes and eosinophils (types of white blood cells). Histiocytoid hemangioma usually forms on or in the skin, especially the skin of the head, but can occur in other areas of the body, such as in bone. On the skin, it may appear as firm pink to red bumps that may be itchy or painful. If the tumor is in bone, it may cause swelling and pain. Histiocytoid hemangioma is sometimes caused by injury and often comes back after treatment. Histiocytoid hemangioma is most common in young and middle-aged adults. It is a type of vascular tumor. Also called angiolymphoid hyperplasia with eosinophilia and epithelioid hemangioma.
  histiocytosis: (HIS-tee-oh-sy-TOH-sis)
    Pronunciation of dictionary term "histiocytosis"
    A group of rare disorders in which too many histiocytes (a type of white blood cell) build up in certain tissues and organs, including the skin, bones, spleen, liver, lungs, and lymph nodes. This can cause damage to tissue or tumors to form in one or more parts of the body. The tumor may be benign (not cancer) or malignant (cancer). There are different types of histiocytosis, including Langerhans cell histiocytosis (LCH), hemophagocytic lymphohistiocytosis (HLH), and malignant histiocytic disorders. Histiocytosis occurs most often in children, but can occur at any age. Also called histiocytic neoplasm.
  histologic examination: (HIS-tuh-LAH-jik eg-ZA-mih-NAY-shun)
    Pronunciation of dictionary term "histologic examination"
    The examination of tissue specimens under a microscope.
  histologic grade: (HIS-tuh-LAH-jik grayd)
    Pronunciation of dictionary term "histologic grade"
    A description of a tumor based on how abnormal the cancer cells and tissue look under a microscope and how quickly the cancer cells are likely to grow and spread. Low-grade cancer cells look more like normal cells and tend to grow and spread more slowly than high-grade cancer cells. Grading systems are different for each type of cancer. They are used to help plan treatment and determine prognosis. Also called grade and tumor grade.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  histology: (his-TAH-loh-jee)
    Pronunciation of dictionary term "histology"
    The study of tissues and cells under a microscope.
  histone: (HIS-tone)
    Pronunciation of dictionary term "histone"
    A type of protein found in chromosomes. Histones bind to DNA, help give chromosomes their shape, and help control the activity of genes.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  histone deacetylase: (HIS-tone dee-uh-SEH-tih-lays)
    Pronunciation of dictionary term "histone deacetylase"
    An enzyme that removes a small molecule called an acetyl group from histones (proteins found in chromosomes). This changes the way the histones bind to DNA and may affect its activity. Histone deacetylase inhibitors are being studied in the treatment of cancer. Also called HDAC.
  histone deacetylase inhibitor: (HIS-tone dee-uh-SEH-tih-lays in-HIH-bih-ter)
    Pronunciation of dictionary term "histone deacetylase inhibitor"
    A substance that causes a chemical change that stops tumor cells from dividing. Histone deacetylase inhibitors are being studied in the treatment of cancer. Also called HDAC inhibitor.
  histone methyltransferase inhibitor: (HIS-tone MEH-thul-TRANZ-feh-rays in-HIH-bih-ter)
    Pronunciation of dictionary term "histone methyltransferase inhibitor"
    A substance that blocks certain enzymes involved in gene expression and cell division. These enzymes may be found in a mutated (changed) form or at high levels in some types of cancer cells. Blocking them may help keep cancer cells from growing. Histone methyltransferase inhibitors are being studied in the treatment of some types of cancer. They are a type of targeted therapy. Also called HMT inhibitor.
  histopathology: (HIS-toh-puh-THAH-loh-jee)
    Pronunciation of dictionary term "histopathology"
    The study of diseased cells and tissues using a microscope.
  historic cohort study: (hih-STOR-ik KOH-hort STUH-dee)
    Pronunciation of dictionary term "historic cohort study"
    A research study in which the medical records of groups of individuals who are alike in many ways but differ by a certain characteristic (for example, female nurses who smoke and those who do not smoke) are compared for a particular outcome (such as lung cancer). Also called retrospective cohort study.
  historical control subject: (hih-STOR-ih-kul kun-TROLE SUB-jekt)
    Pronunciation of dictionary term "historical control subject"
    An individual treated in the past and used in a comparison group when researchers analyze the results of a clinical study that had no control group. The use of a control, or comparison, group helps researchers determine the effects of a new treatment more accurately.
  histrelin acetate: (his-TREH-lin A-seh-tayt)
    Pronunciation of dictionary term "histrelin acetate"
    A drug used under the brand name Vantas as palliative therapy for advanced prostate cancer. Histrelin acetate initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men. With continued use, histrelin acetate lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels. Histrelin acetate is also used under the brand name Supprelin LA to treat early puberty in males and females. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist and a type of androgen deprivation therapy that is reversible.
  HIV: The cause of acquired immunodeficiency syndrome (AIDS). Also called human immunodeficiency virus.
    More Information
    - HIV Infection and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hiv-fact-sheet)
  HIV antibody: (... AN-tee-BAH-dee)
    Pronunciation of dictionary term "HIV antibody"
    A substance produced by certain white blood cells in reaction to contact with the human immunodeficiency virus (HIV).
  HIV antibody test: (… AN-tee-BAH-dee …)
    Pronunciation of dictionary term "HIV antibody test"
    A test to check for human immunodeficiency virus (HIV) infection. HIV is the virus that causes acquired immunodeficiency syndrome (AIDS). An HIV antibody test checks for HIV antibodies in a sample of blood, urine, or saliva. It can take from 2 weeks to 6 months after a person is infected with HIV before the antibodies are found with this test. It is the most common type of HIV test.
  HIV DNA test: A test to check for human immunodeficiency virus (HIV) infection. HIV is the virus that causes acquired immunodeficiency syndrome (AIDS). An HIV DNA test checks for DNA (genetic material) from the virus in a sample of blood. This test can find HIV in the blood about 9-11 days after the person is infected with the virus. An HIV DNA test may be used to test someone who has just become infected with HIV and it may also be used to test for infection in infants born to mothers infected with HIV.
  HIV negative: (... NEH-guh-tiv)
    Pronunciation of dictionary term "HIV negative"
    Refers to a person who is not infected with the human immunodeficiency virus (HIV). HIV is the virus that causes acquired immunodeficiency syndrome (AIDS).
  HIV positive: (... PAH-zih-tiv)
    Pronunciation of dictionary term "HIV positive"
    Refers to a person who is infected with the human immunodeficiency virus (HIV). HIV is the virus that causes acquired immunodeficiency syndrome (AIDS).
  HIV RNA test: A test to check for human immunodeficiency virus (HIV) infection. HIV is the virus that causes acquired immunodeficiency syndrome (AIDS). An HIV RNA test checks for RNA (genetic material) from the virus in a sample of blood. This test can find HIV in the blood about 9-11 days after the person is infected with the virus. An HIV RNA test is used to test someone who may have just become infected with HIV.
  HIV test: (… test)
    Pronunciation of dictionary term "HIV test"
    A test to check for human immunodeficiency virus (HIV) infection. HIV is the virus that causes acquired immunodeficiency syndrome (AIDS). The most common type of HIV test is called the HIV antibody test, which checks for antibodies against HIV in a sample of blood, urine, or fluid from the mouth. It can take from 2 weeks to 6 months after a person is infected with HIV before the antibodies are found with an HIV antibody test. Another type of HIV test checks for RNA or DNA from HIV in a sample of blood. This test can find HIV in a person’s blood about 9-11 days after the person is infected with the virus.
  HIV window period: (… WIN-doh PEER-ee-ud)
    Pronunciation of dictionary term "HIV window period"
    The time period that starts when a person becomes infected with the human immunodeficiency virus (HIV) and ends when the body makes enough antibodies against the virus or HIV DNA or RNA to be found with an HIV test. For the test that looks for antibodies against HIV, the HIV window period can last from 2 weeks to 6 months. For the HIV DNA or RNA test, the HIV window period is about 9-11 days. During the HIV window period, an infected person may have negative HIV test results but still be able to infect other people.
  hives: (hyvz)
    Pronunciation of dictionary term "hives"
    Itchy, raised red areas on the skin. Hives are caused by a reaction to certain foods, drugs, infections, or emotional stress. Also called urticaria.
  HLA: A type of molecule found on the surface of most cells in the body. HLAs play an important part in the body's immune response to foreign substances. They make up a person’s tissue type, which varies from person to person. HLA tests are done before a donor stem cell or organ transplant, to find out if tissues match between the donor and the person receiving the transplant. Also called human leukocyte antigen and human lymphocyte antigen.
  HLA matching: (… MA-ching)
    Pronunciation of dictionary term "HLA matching"
    A process in which blood or tissue samples are tested for human leukocyte antigens (HLAs). HLAs are molecules found on the surface of most cells in the body. They make up a person’s tissue type, which varies from person to person. They play an important part in the body's immune response to foreign substances. HLA matching is done before a donor stem cell or organ transplant to find out if tissues match between the donor and the person receiving the transplant. Also called human leukocyte antigen matching.
  HLA-A*02:01 antigen: (… AN-tih-jen)
    Pronunciation of dictionary term "HLA-A*02:01 antigen"
    A common cell surface marker that is part of the set of HLA antigens that make up a person’s tissue type. HLA antigens are found on the surface of most cells in the body, and they play an important role in the body's immune response to foreign substances. The HLA-A*02:01 antigen is also found on the surface of some types of cancer cells, such as some melanoma cells, which may help trigger the immune system to destroy the cancer cells.
  HLH: A rare disorder in which histiocytes and lymphocytes (types of white blood cells) build up in organs including the skin, spleen, and liver, and destroy other blood cells. HLH may be inherited or caused by certain conditions or diseases, including infections, immunodeficiency (inability of the body to fight infections), and cancer. Also called hemophagocytic lymphohistiocytosis.
    More Information
    - Familial hemophagocytic lymphohistiocytosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6589/hemophagocytic-lymphohistiocytosis)
    - Familial hemophagocytic lymphohistiocytosis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-hemophagocytic-lymphohistiocytosis/)
  hLL1: A substance being studied in the treatment of multiple myeloma and several other types of cancer. It binds to CD74, a protein on the surface of myeloma cells and certain other types of cells. It may help kill cancer cells. hLL1 is a type of monoclonal antibody. Also called IMMU-110 and milatuzumab.
  HLRCC: A rare, inherited disorder in which benign (not cancer) skin lesions called leiomyomas form in the smooth muscle tissue around the hair follicles. They usually form on the arms, legs, chest, and abdomen. Benign leiomyomas may also form as fibroids in the uterus in females. People with HLRCC have an increased risk of kidney cancer. The signs and symptoms of HLRCC usually do not appear until young adulthood. HLRCC is caused by a mutation in the FH gene. It is inherited in an autosomal dominant manner. Also called hereditary leiomyomatosis and renal cell cancer.
    More Information
    - Hereditary leiomyomatosis and renal cell cancer (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10096/hereditary-leiomyomatosis-and-renal-cell-cancer)
    - Hereditary leiomyomatosis and renal cell cancer (MedlinePlus) (https://medlineplus.gov/genetics/condition/hereditary-leiomyomatosis-and-renal-cell-cancer/)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    Areas of the body affected by hereditary leiomyomatosis and renal cell cancer (HLRCC). HLRCC is an inherited disorder that causes an increased risk of kidney cancer. It can also cause lesions in the skin and uterus (in females).
    Drawing showing areas of the body affected by hereditary leiomyomatosis and renal cell cancer, including the skin, kidneys, and uterus.
  HMG-CoA reductase inhibitor: (HMG-koh-A ree-DUK-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "HMG-CoA reductase inhibitor"
    A substance that blocks an enzyme needed by the body to make cholesterol and lowers the amount of cholesterol in the blood. HMG-CoA reductase inhibitor drugs are called statins. Also called hydroxymethylglutaryl-coenzyme A reductase inhibitor.
  HMGA1: A protein that binds to the DNA and certain proteins in chromosomes. It is involved in many functions in the cell, and helps protect cells from dying. HMGA1 is found at high levels in several types of cancer cells.
  HMR 1275: A substance being studied in the treatment of several types of cancer. It stops cells from dividing and may kill cancer cells. It is a type of cyclin-dependent kinase (CDK) inhibitor. Also called alvocidib and flavopiridol.
  HMT inhibitor: (... in-HIH-bih-ter)
    Pronunciation of dictionary term "HMT inhibitor"
    A substance that blocks certain enzymes involved in gene expression and cell division. These enzymes may be found in a mutated (changed) form or at high levels in some types of cancer cells. Blocking them may help keep cancer cells from growing. HMT inhibitors are being studied in the treatment of some types of cancer. They are a type of targeted therapy. Also called histone methyltransferase inhibitor.
  HNPCC: An inherited disorder that increases the risk of developing colorectal cancer, endometrial cancer, ovarian cancer, and many other types of cancer, such as cancers of the stomach, small intestine, pancreas, bile duct, urinary tract, and brain, often before age 50. HNPCC is caused by mutations (changes) in genes that affect DNA mismatch repair, a process that fixes mistakes that occur when DNA is copied. These genes are MLH1, MSH2, MSH6, PMS2, and EPCAM. Also called hereditary nonpolyposis colorectal cancer and Lynch syndrome.
    More Information
    - Lynch syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/lynch-syndrome/)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  Hodgkin and Reed-Sternberg cell: (HOJ-kin ... reed-STERN-berg sel)
    Pronunciation of dictionary term "Hodgkin and Reed-Sternberg cell"
    A type of cell that appears in people with Hodgkin disease. The number of these cells increases as the disease advances. Also called Reed-Sternberg cell.
    Reed-Sternberg cell. Reed-Sternberg cells are large, abnormal lymphocytes (a type of white blood cell) that may contain more than one nucleus. These cells are found in people with Hodgkin lymphoma. Reed-Sternberg cells are also called Hodgkin and Reed-Sternberg cells.
    Reed-Sternberg cell; photograph shows normal lymphocytes compared with a Reed-Sternberg cell.
  Hodgkin disease: (HOJ-kin dih-ZEEZ)
    Pronunciation of dictionary term "Hodgkin disease"
    A cancer of the immune system that is marked by the presence of a type of cell called the Reed-Sternberg cell. The two major types of Hodgkin disease are classic Hodgkin lymphoma and nodular lymphocyte-predominant Hodgkin lymphoma. Signs and symptoms include painless, swollen lymph nodes, an enlarged spleen, fever, weight loss, fatigue, and night sweats. Also called Hodgkin lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
    Reed-Sternberg cell. Reed-Sternberg cells are large, abnormal lymphocytes (a type of white blood cell) that may contain more than one nucleus. These cells are found in people with Hodgkin lymphoma. Reed-Sternberg cells are also called Hodgkin and Reed-Sternberg cells.
    Reed-Sternberg cell; photograph shows normal lymphocytes compared with a Reed-Sternberg cell.
  Hodgkin lymphoma: (HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "Hodgkin lymphoma"
    A cancer of the immune system that is marked by the presence of a type of cell called the Reed-Sternberg cell. The two major types of Hodgkin lymphoma are classic Hodgkin lymphoma and nodular lymphocyte-predominant Hodgkin lymphoma. Signs and symptoms include painless, swollen lymph nodes, an enlarged spleen, fever, weight loss, fatigue, and night sweats. Also called Hodgkin disease.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
    Reed-Sternberg cell. Reed-Sternberg cells are large, abnormal lymphocytes (a type of white blood cell) that may contain more than one nucleus. These cells are found in people with Hodgkin lymphoma. Reed-Sternberg cells are also called Hodgkin and Reed-Sternberg cells.
    Reed-Sternberg cell; photograph shows normal lymphocytes compared with a Reed-Sternberg cell.
  holmium Ho 166 DOTMP: (HOLE-mee-um ...)
    Pronunciation of dictionary term "holmium Ho 166 DOTMP"
    A drug containing a radioactive isotope that is used in the diagnosis and treatment of cancer.
  holy thistle: (... THIH-sul)
    Pronunciation of dictionary term "holy thistle"
    A plant whose leaves, stems, and flowers have been used in some cultures to treat certain medical problems. Holy thistle may have anti-inflammatory and anticancer effects. The scientific name is Cnicus benedictus. Also called blessed thistle, cardin, spotted thistle, and St. Benedict's thistle.
  homeopathic medicine: (HOH-mee-uh-PA-thik MEH-dih-sin)
    Pronunciation of dictionary term "homeopathic medicine"
    An alternative approach to medicine based on the belief that natural substances, prepared in a special way and used most often in very small amounts, restore health. According to these beliefs, in order for a remedy to be effective, it must cause in a healthy person the same symptoms being treated in the patient. Also called homeopathy.
  homeopathy: (HOH-mee-AH-puh-thee)
    Pronunciation of dictionary term "homeopathy"
    An alternative approach to medicine based on the belief that natural substances, prepared in a special way and used most often in very small amounts, restore health. According to these beliefs, in order for a remedy to be effective, it must cause in a healthy person the same symptoms being treated in the patient. Also called homeopathic medicine.
  homeostasis: (HOH-mee-oh-STAY-sis)
    Pronunciation of dictionary term "homeostasis"
    A state of balance among all the body systems needed for the body to survive and function correctly. In homeostasis, body levels of acid, blood pressure, blood sugar, electrolytes, energy, hormones, oxygen, proteins, and temperature are constantly adjusted to respond to changes inside and outside the body, to keep them at a normal level.
  homeostatic: (HOH-mee-oh-STA-tik)
    Pronunciation of dictionary term "homeostatic"
    Having to do with homeostasis, which is a state of balance among all the body systems, needed for the body to function correctly.
  homoharringtonine: (hoh-moh-HAYR-ing-tuh-neen)
    Pronunciation of dictionary term "homoharringtonine"
    A drug used to treat adults with certain types of chronic myelogenous leukemia that cannot be treated with tyrosine kinase inhibitors (a type of anticancer drug) or that have not gotten better after treatment with at least two tyrosine kinase inhibitors. It is also being studied in the treatment of other types of cancer. Homoharringtonine blocks certain proteins involved in cell growth and may kill cancer cells. It is a type of plant alkaloid and a type of protein synthesis inhibitor. Also called omacetaxine mepesuccinate and Synribo.
    More Information
    - Omacetaxine Mepesuccinate (https://www.cancer.gov/about-cancer/treatment/drugs/omacetaxinemepesuccinate)
  homologous recombination repair pathway: (hoh-MAH-luh-gus ree-KOM-bih-NAY-shun reh-PAYR PATH-way)
    Pronunciation of dictionary term "homologous recombination repair pathway"
    Describes a process in a cell in which a group of proteins work together to repair DNA damage. Changes in the homologous recombination repair pathway that result in the inability to repair DNA may lead to diseases such as cancer. Drugs that affect this pathway are being studied in the prevention and treatment of cancer and other diseases. Also called HRR pathway.
  homozygous genotype: (HOH-moh-ZY-gus JEE-noh-tipe)
    Pronunciation of dictionary term "homozygous genotype"
    A term that describes having two identical versions of the same gene (one inherited from the mother and one inherited from the father). In a homozygous genotype, either both genes are normal or both genes have the same mutation (change). For example, a person who inherits the same mutation in both copies of the LDLR gene is homozygous for that gene and will develop a severe form of familial hypercholesterolemia (very high levels of cholesterol in the blood).
    More Information
    - Homozygous (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=105)
  hookah: (HOOK-uh)
    Pronunciation of dictionary term "hookah"
    A device used to smoke a special type of tobacco that comes in different flavors. In a hookah, charcoal is used to heat the tobacco. The smoke from the heated tobacco is cooled by passing it through a water-filled bowl. It is then inhaled through a flexible tube with a mouthpiece. Hookah tobacco smoke contains nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Hookah smoking can lead to nicotine addiction and can cause many of the same health problems as cigarette smoking. Hookah smoking is not safer than cigarette smoking. Also called water pipe.
  hormonal contraception: (hor-MOH-nul KON-truh-SEP-shun)
    Pronunciation of dictionary term "hormonal contraception"
    A type of birth control that uses hormones to prevent pregnancy. Hormonal contraceptives contain estrogen and progesterone, or progesterone only. They prevent pregnancy by blocking the release of eggs from the ovaries, thinning the lining of the uterus, or thickening the mucus in the cervix to help keep sperm from reaching the egg. Hormonal contraceptives may be taken by mouth, injected or inserted under the skin, placed on the skin as a patch, or placed in the vagina or uterus.
    More Information
    - Oral Contraceptives and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/oral-contraceptives-fact-sheet)
  hormonal therapy: (hor-MOH-nul THAYR-uh-pee)
    Pronunciation of dictionary term "hormonal therapy"
    Treatment that adds, blocks, or removes hormones. For certain conditions (such as diabetes or menopause), hormones are given to adjust low hormone levels. Hormones can also cause certain cancers (such as prostate and breast cancer) to grow. To slow or stop the growth of cancer, synthetic hormones or other drugs may be given to block the body’s natural hormones, or surgery is used to remove the gland that makes a certain hormone. Also called endocrine therapy, hormone therapy, and hormone treatment.
  hormone: (HOR-mone)
    Pronunciation of dictionary term "hormone"
    One of many substances made by glands in the body. Hormones circulate in the bloodstream and control the actions of certain cells or organs. Some hormones can also be made in the laboratory.
  hormone receptor: (HOR-mone reh-SEP-ter)
    Pronunciation of dictionary term "hormone receptor"
    A cell protein that binds a specific hormone. The hormone receptor may be on the surface of the cell or inside the cell. Many changes take place in a cell after a hormone binds to its receptor.
  hormone receptor negative: (HOR-mone reh-SEP-ter NEH-guh-tiv)
    Pronunciation of dictionary term "hormone receptor negative"
    Describes cells that do not have a group of proteins that bind to a specific hormone. For example, some breast cancer cells do not have receptors for the hormones estrogen or progesterone. These cells are hormone receptor negative and they do not need estrogen or progesterone to grow. This can affect how the cancer is treated. Knowing if the cancer is hormone receptor negative may help plan treatment.
  hormone receptor positive: (HOR-mone reh-SEP-ter PAH-zih-tiv)
    Pronunciation of dictionary term "hormone receptor positive"
    Describes cells that have a group of proteins that bind to a specific hormone. For example, some breast cancer cells have receptors for the hormones estrogen or progesterone. These cells are hormone receptor positive and they need estrogen or progesterone to grow. This can affect how the cancer is treated. Knowing if the cancer is hormone receptor positive may help plan treatment.
  hormone receptor status: (HOR-mone reh-SEP-ter STA-tus)
    Pronunciation of dictionary term "hormone receptor status"
    A term used to describe whether cells have proteins called hormone receptors that bind to a specific hormone. For example, breast cancer cells that have receptors for the hormone estrogen are called estrogen receptor positive and may need estrogen to grow. Knowing the hormone receptor status of the cancer may help plan treatment.
  hormone receptor test: (HOR-mone reh-SEP-ter test)
    Pronunciation of dictionary term "hormone receptor test"
    A test to measure the amount of certain proteins, called hormone receptors, in cancer tissue. Hormones can attach to these proteins. A high level of hormone receptors may mean that hormones help the cancer grow.
  hormone replacement therapy: (HOR-mone reh-PLAYS-ment THAYR-uh-pee)
    Pronunciation of dictionary term "hormone replacement therapy"
    Treatment with hormones to replace natural hormones when the body does not make enough. For example, hormone replacement therapy may be given when the thyroid gland does not make enough thyroid hormone or when the pituitary gland does not make enough growth hormone. Or, it may be given to women after menopause to replace the hormones estrogen and progesterone that are no longer made by the body. Also called HRT.
    More Information
    - Menopausal Hormone Therapy and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/mht-fact-sheet)
  hormone responsive: (HOR-mone reh-SPONT-siv)
    Pronunciation of dictionary term "hormone responsive"
    In oncology, describes cancer that responds to hormone treatment.
  hormone therapy: (HOR-mone THAYR-uh-pee)
    Pronunciation of dictionary term "hormone therapy"
    Treatment that adds, blocks, or removes hormones. For certain conditions (such as diabetes or menopause), hormones are given to adjust low hormone levels. Hormones can also cause certain cancers (such as prostate and breast cancer) to grow. To slow or stop the growth of cancer, synthetic hormones or other drugs may be given to block the body’s natural hormones, or surgery is used to remove the gland that makes a certain hormone. Also called endocrine therapy, hormonal therapy, and hormone treatment.
  hormone treatment: (HOR-mone TREET-ment)
    Pronunciation of dictionary term "hormone treatment"
    Treatment that adds, blocks, or removes hormones. For certain conditions (such as diabetes or menopause), hormones are given to adjust low hormone levels. Hormones can also cause certain cancers (such as prostate and breast cancer) to grow. To slow or stop the growth of cancer, synthetic hormones or other drugs may be given to block the body’s natural hormones, or surgery is used to remove the gland that makes a certain hormone. Also called endocrine therapy, hormonal therapy, and hormone therapy.
  hormone-refractory: (HOR-mone-reh-FRAK-tor-ee)
    Pronunciation of dictionary term "hormone-refractory"
    In medicine, describes a disease or condition that does not respond to treatment with hormones. Also called hormone-resistant.
  hormone-resistant: (HOR-mone-reh-ZIH-stunt)
    Pronunciation of dictionary term "hormone-resistant"
    In medicine, describes a disease or condition that does not respond to treatment with hormones. Also called hormone-refractory.
  hormone-sensitive prostate cancer: (HOR-mone-SEN-sih-tiv PROS-tayt KAN-ser)
    Pronunciation of dictionary term "hormone-sensitive prostate cancer"
    Prostate cancer that needs androgens (male hormones) to grow and therefore stops growing when androgens are not present. Many early-stage prostate cancers are androgen-dependent, so reducing the amount of androgens in the body or blocking their action may be an effective type of therapy. Also called androgen-dependent prostate cancer, androgen-sensitive prostate cancer, castrate-sensitive prostate cancer, CSPC, and HSPC.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  Horner syndrome: (...SIN-drome)
    Pronunciation of dictionary term "Horner syndrome"
    A condition in which one side of the face is flushed, does not produce sweat, and has a constricted pupil and drooping eyelid. It can be caused by an injury to, or paralysis of, nerves in the neck, or by a tumor.
    More Information
    - Horner's syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6670/horners-syndrome)
    - Horner syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/horner-syndrome/)
  hospice: (HOS-pis)
    Pronunciation of dictionary term "hospice"
    A program that gives special care to people who are near the end of life and have stopped treatment to cure or control their disease. Hospice offers physical, emotional, social, and spiritual support for patients and their families. The main goal of hospice care is to control pain and other symptoms of illness so patients can be as comfortable and alert as possible. It is usually given at home, but may also be given in a hospice center, hospital, or nursing home.
    More Information
    - Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/)
  hospice center: (HOS-pis SEN-ter)
    Pronunciation of dictionary term "hospice center"
    A place that provides special care for people who are near the end of life and have stopped treatment to cure or control their disease. Hospice centers provide physical, emotional, social, and spiritual support for patients and their families. They provide care for patients whose pain and other symptoms cannot be managed safely and comfortably at home or who do not have a caregiver at home. Hospice centers may also provide respite care (short-term care for a patient so that the usual caregiver can have a break).
  hospitalist: (HOS-pih-tuh-list)
    Pronunciation of dictionary term "hospitalist"
    A medical doctor who manages and coordinates the daily medical care of patients while they are in the hospital. A hospitalist may also supervise and teach medical students, interns, and residents. A patient’s personal doctor will work with a hospitalist to care for his or her patient while the patient is in the hospital.
  host cell: (... sel)
    Pronunciation of dictionary term "host cell"
    A cell that is infected by a virus or another type of microorganism.
  hot flash: (hot flash)
    Pronunciation of dictionary term "hot flash"
    A sudden, temporary onset of body warmth, flushing, and sweating (often associated with menopause).
    More Information
    - Hot Flashes and Night Sweats
  hot nodule: (hot NAH-jool)
    Pronunciation of dictionary term "hot nodule"
    When radioactive material is used to examine the thyroid with a scanner, nodules that collect more radioactive material than the surrounding thyroid tissue are considered "hot." Hot nodules are rarely malignant. Hot nodules are sometimes called hyperfunctioning nodules.
  hot tumor: (hot TOO-mer)
    Pronunciation of dictionary term "hot tumor"
    Describes a tumor that is likely to trigger a strong immune response. Hot tumors often have many molecules on their surface that allow T cells (a type of immune cell) to attack and kill the tumor cells. Hot tumors usually respond to immunotherapy. Melanoma, non-small cell lung cancer, and cancers of the bladder, head and neck, kidney, and liver are usually considered hot tumors.
  hotspot: (hot-spot)
    Pronunciation of dictionary term "hotspot"
    In genetics, an area of DNA that is likely to mutate (change).
  HPPH: 2-(1-hexyloxyethyl)-2-devinyl pyropheophorbide-a. A drug that is used in photodynamic therapy that is absorbed by tumor cells; when exposed to light, it becomes active and kills the cancer cells.
  HPRC: A rare, inherited disorder that increases the risk of a type of kidney cancer called type 1 papillary kidney cancer. This cancer forms in cells that line the small tubes in the kidney that filter waste from the blood and make urine. HPRC often affects both kidneys, and often there is more than one tumor in each kidney. It is caused by mutations (changes) in a gene called MET. HPRC is a type of hereditary cancer syndrome. Also called hereditary papillary renal cancer and hereditary papillary renal carcinoma.
    More Information
    - Papillary renal cell carcinoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.
    Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.
  HPV: A group of more than 200 common viruses. Some HPVs, called cutaneous HPVs, are transmitted by casual contact and can infect the skin and cause common skin warts. Other HPVs, known as mucosal HPVs, can infect the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat. Infection with some mucosal HPVs (collectively known as low-risk HPVs) can cause warts in or around the genitals, anus, mouth, and respiratory tract but rarely cause cancer. Long-lasting infection with other mucosal HPVs (collectively known as high-risk HPVs) can cause cell changes that become cancer over time if not found and removed. HPV-related cancers include cancers of the cervix, anus, oropharynx, vagina, vulva, and penis. Mucosal HPVs are transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. Also called human papillomavirus.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
    - Recombinant Human Papillomavirus (HPV) Bivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-bivalent-vaccine)
    - Recombinant Human Papillomavirus (HPV) Quadrivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-quadrivalent-vaccine)
  HPV 16: A type of HPV that is transmitted sexually and causes cancers of the cervix, anus, oropharynx (the middle part of the throat, behind the mouth), vagina, vulva, and penis. A long-lasting infection with HPV 16 can cause cell changes that, if not treated, may worsen over time and become cancer. HPV 16 and HPV 18 are responsible for most HPV-related cancers. Also called human papillomavirus 16.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
  HPV 18: A type of HPV that is transmitted sexually and causes cancers of the cervix, anus, oropharynx (the middle part of the throat, behind the mouth), vagina, vulva, and penis. A long-lasting infection with HPV 18 can cause cell changes that, if not treated, may worsen over time and become cancer. HPV 18 and HPV 16 are responsible for most HPV-related cancers. Also called human papillomavirus 18.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
  HPV DNA test: (... test)
    Pronunciation of dictionary term "HPV DNA test"
    A laboratory test in which cells are scraped from the cervix to look for DNA of human papillomaviruses (HPV). HPV can cause abnormal tissue growth (for example, warts) and other changes to cells. Infection for a long time with certain types of HPV can cause cervical cancer. HPV can also play a role in other types of cancer, such as cancers of the anus, vagina, vulva, penis, and oropharynx. Also called human papillomavirus DNA test.
    More Information
    - Cervical Cancer Screening (Health Professional Version) (https://www.cancer.gov/types/cervical/hp/cervical-screening-pdq)
  HPV RNA test: (… test)
    Pronunciation of dictionary term "HPV RNA test"
    A laboratory test in which cells are scraped from the cervix to look for RNA of the most common types of human papillomavirus (HPV). Certain types of HPV may cause abnormal tissue growth, such as warts, and other changes to cells. Infection for a long time with other types of HPV may cause cervical cancer. An HPV RNA test may be done with a Pap test to check for HPV infection and cervical cancer. HPV infection may also cause other types of cancer, such as cancers of the anus, vagina, vulva, penis, and oropharynx. Also called human papillomavirus RNA test.
  HPV test: A laboratory test in which cells are tested for DNA or RNA from certain types of human papillomavirus (HPV) that are known to cause cervical cancer. These high-risk types of HPV can also cause other types of cancer, including cancers of the anus, vagina, vulva, penis, and oropharynx. An HPV test may be used alone for cervical cancer screening (also called primary HPV testing), or it can be done at the same time as a Pap test (called cotesting). An HPV test may also be done after certain abnormal Pap test results. Also called human papillomavirus test.
    More Information
    - Cervical Cancer Screening
  HPV vaccine: (... vak-SEEN)
    Pronunciation of dictionary term "HPV vaccine"
    A vaccine that helps protect the body against infection with certain types of human papillomavirus (HPV). HPV infection can cause abnormal tissue growth, such as warts, and other changes to cells. Infection for a long time with certain types of HPV can cause cancers of the cervix, vagina, vulva, anus, penis, and oropharynx. HPV vaccines are being used to prevent some of these cancers. They are also being used to prevent genital warts and abnormal lesions that may lead to some of these cancers. Also called human papillomavirus vaccine.
    More Information
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  HPV/Pap cotest: A procedure in which a human papillomavirus (HPV) test and a Pap test are done at the same time to check for cervical cancer. The HPV test looks for DNA or RNA from certain high-risk types of HPV in samples of cells taken from the cervix. The Pap test checks for cervical cancer cells and cell changes that may lead to cervical cancer. The same cell sample may be used for both the HPV test and the Pap test. Women aged 30 to 65 years may have an HPV/Pap cotest every 5 years. Cotesting is more likely to find abnormal cells or cervical cancer than a Pap test alone is. Also called Pap/HPV cotest.
    More Information
    - Cervical Cancer Screening
  HRAS gene: (… jeen)
    Pronunciation of dictionary term "Hras gene"
    A gene that makes a protein that is involved in cell signaling pathways that control cell growth and cell death. Mutated (changed) forms of the HRAS gene may be found in some types of cancer. These changes may cause cancer cells to grow and spread in the body.
  HRR pathway: (… PATH-way)
    Pronunciation of dictionary term "HRR pathway"
    Describes a process in a cell in which a group of proteins work together to repair DNA damage. Changes in the HRR pathway that result in the inability to repair DNA may lead to diseases such as cancer. Drugs that affect this pathway are being studied in the prevention and treatment of cancer and other diseases. Also called homologous recombination repair pathway.
  HRT: Treatment with hormones to replace natural hormones when the body does not make enough. For example, HRT may be given when the thyroid gland does not make enough thyroid hormone or when the pituitary gland does not make enough growth hormone. Or, it may be given to women after menopause to replace the hormones estrogen and progesterone that are no longer made by the body. Also called hormone replacement therapy.
    More Information
    - Menopausal Hormone Therapy and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/mht-fact-sheet)
  HSIL: An area of abnormal cells that forms on the surface of certain organs, such as the cervix, vagina, vulva, anus, and esophagus. HSILs look somewhat to very abnormal when looked at under a microscope. They are usually caused by chronic infection with certain types of human papillomavirus (HPV) and are found when a Pap test or biopsy is done. If not treated, these abnormal cells may become cancer and spread into nearby tissue. A HSIL is sometimes called moderate or severe dysplasia. Also called high-grade squamous intraepithelial lesion.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
    Cervical changes. The cervix is the lower, narrow end of the uterus that forms a canal between the uterus and vagina. Before cancer cells form in tissues of the cervix, the cells of the cervix go through abnormal changes called dysplasia. There are different types of dysplasia. Mild dysplasia, called low-grade intraepithelial lesion (LSIL) is one type. Moderate or severe dysplasia, called high-grade intraepithelial lesion (HSIL) is another type of dysplasia. LSIL and HSIL may or may not become cancer.
    Cervical changes; drawing shows a cross-section of the uterus, cervix, and vagina. Also shown are four panels showing cell changes inside the cervix. The first panel shows normal cells. The second and third panels show abnormal cells called LSIL and HSIL. The fourth panel shows cervical cancer cells. Arrows are used between the panels to show that normal cells may become LSIL or HSIL, which may or may not become cancer.
  HSP: One of a group of proteins that help protect cells from stresses such as heat, cold, and low amounts of oxygen or glucose (sugar). HSPs help other proteins function in normal cells and may be present at high levels in cancer cells. Blocking the activity of a HSP called HSP90 is being studied in the treatment of cancer. Other HSPs including HSP70 and gp96 are being studied in vaccines to treat cancer. Also called heat-shock protein and stress protein.
  HSPC: Prostate cancer that needs androgens (male hormones) to grow and therefore stops growing when androgens are not present. Many early-stage prostate cancers are androgen-dependent, so reducing the amount of androgens in the body or blocking their action may be an effective type of therapy. Also called androgen-dependent prostate cancer, androgen-sensitive prostate cancer, castrate-sensitive prostate cancer, CSPC, and hormone-sensitive prostate cancer.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  HSV: A type of virus that causes herpes infections and has DNA as its genetic material. There are two types of HSVs. Infections with type 1 viruses cause cold sores on the lips or nostrils. Infections with type 2 viruses cause sores on the genitals (external and internal sex organs and glands). Also called herpes simplex virus, HHV, and human herpesvirus.
  HTLV-1: A type of virus that infects T cells (a type of white blood cell) and can cause leukemia and lymphoma. HTLV-1 is spread by sharing syringes or needles, through blood transfusions or sexual contact, and from mother to child during birth or breast-feeding. Also called human T-cell leukemia virus type 1 and human T-cell lymphotropic virus type 1.
  hu14.18-interleukin-2 fusion protein: (… in-ter-LOO-kin-2 FYOO-zhun PROH-teen)
    Pronunciation of dictionary term "hu14.18-interleukin-2 fusion protein"
    An anticancer drug in which hu14.18, a monoclonal antibody, is combined with interleukin-2. The monoclonal antibody binds to the cancer cells and delivers IL-2, which stimulates the immune system to destroy the cancer cells.
  Hu3S193: A monoclonal antibody that is being studied in the treatment of some types of cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. Hu3S193 binds to the protein Lewis(y), which is found on colon, breast, lung, ovary, and prostate cancer cells.
  HuAFP31: A monoclonal antibody being studied in the treatment of several types of cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. HuAFP31 attaches to tumor cells that make alpha fetoprotein (AFP). This makes it easier for T cells to find and kill the tumor cells.
  Huang Lian: (hwang lyan)
    Pronunciation of dictionary term "Huang Lian"
    A Chinese herb that has been used as a treatment for a variety of medical problems. It is being studied as an anticancer drug.
  huC242-DM4: A substance being studied in the treatment of some types of cancer. It is made by linking the monoclonal antibody huC242 to a toxic substance called maytansinoid DM4. The monoclonal antibody binds to the surfaces of cancer cells and the maytansinoid DM4 enters the cells and blocks their growth. It is a type of immunotoxin. Also called maytansinoid DM4-conjugated humanized monoclonal antibody huC242.
  HuHMFG1: A monoclonal antibody that binds to the protein MUC1, which is found on breast, ovarian, pancreatic, gastric, and colon cancer cells. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. HuHMFG1 is being studied in the treatment of some types of cancer.
  HuLuc63: A drug used with dexamethasone and either lenalidomide or pomalidomide to treat adults with multiple myeloma. It is used in patients whose cancer was already treated with other anticancer therapies. HuLuc63 binds to a protein called CS1, which is found on myeloma cells and some types of immune cells. HuLuc63 may block CS1 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called elotuzumab and Empliciti.
    More Information
    - Elotuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/elotuzumab)
  human corticotropin-releasing factor: (HYOO-mun KOR-tih-koh-TROH-pin-reh-LEE-sing FAK-ter)
    Pronunciation of dictionary term "human corticotropin-releasing factor"
    A substance being studied in the treatment of brain cancer. It is made naturally by the hypothalamus (a part of the brain) and can also be made in the laboratory. Human corticotropin-releasing factor may help reduce symptoms caused by edema (swelling) of the brain. It is a type of neurohormone. Also called hCRF.
  human EGF receptor 2: (HYOO-mun … reh-SEP-ter ...)
    Pronunciation of dictionary term "human EGF receptor 2"
    A protein involved in normal cell growth. Human EGF receptor 2 may be made in larger than normal amounts by some types of cancer cells, including breast, ovarian, bladder, pancreatic, stomach, and esophageal cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. Checking the amount of human EGF receptor 2 on some types of cancer cells may help plan treatment. Also called c-erbB-2, HER2, HER2/neu, and human epidermal growth factor receptor 2.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  human epidermal growth factor receptor 2: (HYOO-mun eh-pih-DER-mul grothe FAK-ter reh-SEP-ter ...)
    Pronunciation of dictionary term "human epidermal growth factor receptor 2"
    A protein involved in normal cell growth. Human epidermal growth factor receptor 2 may be made in larger than normal amounts by some types of cancer cells, including breast, ovarian, bladder, pancreatic, stomach, and esophageal cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. Checking the amount of human epidermal growth factor receptor 2 on some types of cancer cells may help plan treatment. Also called c-erbB-2, HER2, HER2/neu, and human EGF receptor 2.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  human epidermal growth factor receptor 2 negative: (HYOO-mun eh-pih-DER-mul grothe FAK-ter reh-SEP-ter … NEH-guh-tiv)
    Pronunciation of dictionary term "human epidermal growth factor receptor 2 negative"
    Describes cells that have a small amount or none of a protein called HER2 on their surface. In normal cells, HER2 helps control cell growth. Cancer cells that are human epidermal growth factor receptor 2 negative may grow more slowly and are less likely to recur (come back) or spread to other parts of the body than cancer cells that have a large amount of HER2 on their surface. Checking to see if a cancer is human epidermal growth factor receptor 2 negative may help plan treatment. Cancers that may be human epidermal growth factor receptor 2 negative include breast, bladder, ovarian, pancreatic, and stomach cancers. Also called HER2 negative.
  human epidermal growth factor receptor 2 positive: (HYOO-mun eh-pih-DER-mul grothe FAK-ter reh-SEP-ter … PAH-zih-tiv)
    Pronunciation of dictionary term "human epidermal growth factor receptor 2 positive"
    Describes cells that have a protein called HER2 on their surface. In normal cells, HER2 helps control cell growth. Cancer cells that make too much HER2 may grow more quickly and are more likely to spread to other parts of the body. Checking to see if a cancer is human epidermal growth factor receptor 2 positive may help plan treatment, which may include drugs that kill human epidermal growth factor receptor 2-positive cancer cells. Cancers that may be human epidermal growth factor receptor 2 positive include breast, bladder, pancreatic, ovarian, and stomach cancers. Also called c-erbB-2 positive and HER2 positive.
  human epidermal growth factor receptor 2 test: (HYOO-mun eh-pih-DER-mul grothe FAK-ter reh-SEP-ter 2 …)
    Pronunciation of dictionary term "human epidermal growth factor receptor 2 test"
    A laboratory test that measures the amount of HER2 protein on cancer cells or how many copies of the HER2 gene are in the DNA of cancer cells. The HER2 protein helps control normal cell growth. Larger than normal amounts of the HER2 protein or too many copies of the HER2 gene may be made by some types of cancer, including breast, ovarian, bladder, pancreatic, and stomach cancers. This may cause cancer cells to grow more quickly and spread to other parts of the body. A human epidermal growth factor receptor 2 test may be done to help plan treatment, which may include drugs that target the HER2 protein. It is a type of tumor marker test. Also called HER2 test and HER2/neu test.
  human epididymis protein 4: (HYOO-mun eh-pih-DIH-dih-mis PROH-teen …)
    Pronunciation of dictionary term "human epididymis protein 4"
    A protein found on cells that line the lungs and reproductive organs, such as the ovaries. Human epididymis protein 4 may be found in higher than normal amounts in patients with some types of cancer, including ovarian epithelial cancer. Measuring the amount of human epididymis protein 4 in the blood may help plan cancer treatment or find out if cancer is getting worse or has come back. It is a type of tumor marker. Also called HE4.
    More Information
    - Tumor Markers in Common Use (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-list)
  human herpesvirus: (HYOO-mun HER-peez-VY-rus)
    Pronunciation of dictionary term "human herpesvirus"
    A type of virus that causes herpes infections and has DNA as its genetic material. There are two types of human herpesviruses. Infections with type 1 viruses cause cold sores on the lips or nostrils. Infections with type 2 viruses cause sores on the genitals (external and internal sex organs and glands). Also called herpes simplex virus, HHV, and HSV.
  human herpesvirus 8: (HYOO-mun HER-peez-VY-rus...)
    Pronunciation of dictionary term "human herpesvirus 8"
    A type of virus that causes Kaposi sarcoma (a rare cancer in which lesions grow in the skin, lymph nodes, lining of the mouth, nose, and throat, and other tissues of the body). Human herpesvirus 8 also causes certain types of lymphoma (cancer that begins in cells of the immune system). Also called HHV8, Kaposi sarcoma-associated herpesvirus, and KSHV.
  human immunodeficiency virus: (HYOO-mun IH-myoo-noh-deh-FIH-shun-see VY-rus)
    Pronunciation of dictionary term "human immunodeficiency virus"
    The cause of acquired immunodeficiency syndrome (AIDS). Also called HIV.
    More Information
    - HIV Infection and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hiv-fact-sheet)
  human leukocyte antigen: (HYOO-mun LOO-koh-site AN-tih-jen)
    Pronunciation of dictionary term "human leukocyte antigen"
    A type of molecule found on the surface of most cells in the body. Human leukocyte antigens play an important part in the body's immune response to foreign substances. They make up a person’s tissue type, which varies from person to person. Human leukocyte antigen tests are done before a donor stem cell or organ transplant, to find out if tissues match between the donor and the person receiving the transplant. Also called HLA and human lymphocyte antigen.
  human leukocyte antigen matching: (HYOO-mun LOO-koh-site AN-tih-jen MA-ching)
    Pronunciation of dictionary term "human leukocyte antigen matching"
    A process in which blood or tissue samples are tested for human leukocyte antigens (HLAs). HLAs are molecules found on the surface of most cells in the body. They make up a person’s tissue type, which varies from person to person. They play an important part in the body's immune response to foreign substances. Human leukocyte antigen matching is done before a donor stem cell or organ transplant to find out if tissues match between the donor and the person receiving the transplant. Also called HLA matching.
  human lymphocyte antigen: (HYOO-mun LIM-foh-site AN-tih-jen)
    Pronunciation of dictionary term "human lymphocyte antigen"
    A type of molecule found on the surface of most cells in the body. Human lymphocyte antigens play an important part in the body's immune response to foreign substances. They make up a person’s tissue type, which varies from person to person. Human lymphocyte antigen tests are done before a donor stem cell or organ transplant, to find out if tissues match between the donor and the person receiving the transplant. Also called HLA and human leukocyte antigen.
  human papillomavirus: (HYOO-mun PA-pih-LOH-muh-VY-rus)
    Pronunciation of dictionary term "human papillomavirus"
    A group of more than 200 common viruses. Some human papillomaviruses, called cutaneous human papillomaviruses, are transmitted by casual contact and can infect the skin and cause common skin warts. Other human papillomaviruses, known as mucosal human papillomaviruses, can infect the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat. Infection with some mucosal human papillomaviruses (collectively known as low-risk human papillomaviruses) can cause warts in or around the genitals, anus, mouth, and respiratory tract but rarely cause cancer. Long-lasting infection with other mucosal human papillomaviruses (collectively known as high-risk human papillomaviruses) can cause cell changes that become cancer over time if not found and removed. Human papillomavirus-related cancers include cancers of the cervix, anus, oropharynx, vagina, vulva, and penis. Mucosal human papillomaviruses are transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. Also called HPV.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
    - Recombinant Human Papillomavirus (HPV) Bivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-bivalent-vaccine)
    - Recombinant Human Papillomavirus (HPV) Quadrivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-quadrivalent-vaccine)
  human papillomavirus 16: (HYOO-mun PA-pih-LOH-muh-VY-rus …)
    Pronunciation of dictionary term "human papillomavirus 16"
    A type of HPV that is transmitted sexually and causes cancers of the cervix, anus, oropharynx (the middle part of the throat, behind the mouth), vagina, vulva, and penis. A long-lasting infection with human papillomavirus 16 can cause cell changes that, if not treated, may worsen over time and become cancer. Human papillomavirus 16 and HPV 18 are responsible for most HPV-related cancers. Also called HPV 16.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
  human papillomavirus 18: (HYOO-mun PA-pih-LOH-muh-VY-rus …)
    Pronunciation of dictionary term "human papillomavirus 18"
    A type of HPV that is transmitted sexually and causes cancers of the cervix, anus, oropharynx (the middle part of the throat, behind the mouth), vagina, vulva, and penis. A long-lasting infection with human papillomavirus 18 can cause cell changes that, if not treated, may worsen over time and become cancer. Human papillomavirus 18 and HPV 16 are responsible for most HPV-related cancers. Also called HPV 18.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
  human papillomavirus DNA test: (HYOO-mun PA-pih-LOH-muh-VY-rus …)
    Pronunciation of dictionary term "human papillomavirus DNA test"
    A laboratory test in which cells are scraped from the cervix to look for DNA of human papillomaviruses (HPV). HPV can cause abnormal tissue growth (for example, warts) and other changes to cells. Infection for a long time with certain types of HPV can cause cervical cancer. HPV can also play a role in other types of cancer, such as cancers of the anus, vagina, vulva, penis, and oropharynx. Also called HPV DNA test.
    More Information
    - Cervical Cancer Screening (Health Professional Version) (https://www.cancer.gov/types/cervical/hp/cervical-screening-pdq)
  human papillomavirus RNA test: (HYOO-mun PA-pih-LOH-muh-VY-rus … test)
    Pronunciation of dictionary term "human papillomavirus RNA test"
    A laboratory test in which cells are scraped from the cervix to look for RNA of the most common types of human papillomavirus (HPV). Certain types of HPV may cause abnormal tissue growth, such as warts, and other changes to cells. Infection for a long time with other types of HPV may cause cervical cancer. A human papillomavirus RNA test may be done with a Pap test to check for HPV infection and cervical cancer. HPV infection may also cause other types of cancer, such as cancers of the anus, vagina, vulva, penis, and oropharynx. Also called HPV RNA test.
  human papillomavirus test: (HYOO-mun PA-pih-LOH-muh-VY-rus …)
    Pronunciation of dictionary term "human papillomavirus test"
    A laboratory test in which cells are tested for DNA or RNA from certain types of human papillomavirus (HPV) that are known to cause cervical cancer. These high-risk types of HPV can also cause other types of cancer, including cancers of the anus, vagina, vulva, penis, and oropharynx. A human papillomavirus test may be used alone for cervical cancer screening (also called primary HPV testing), or it can be done at the same time as a Pap test (called cotesting). A human papillomavirus test may also be done after certain abnormal Pap test results. Also called HPV test.
    More Information
    - Cervical Cancer Screening
  human papillomavirus vaccine: (HYOO-mun PA-pih-LOH-muh-VY-rus vak-SEEN)
    Pronunciation of dictionary term "human papillomavirus vaccine"
    A vaccine that helps protect the body against infection with certain types of human papillomavirus (HPV). HPV infection can cause abnormal tissue growth, such as warts, and other changes to cells. Infection for a long time with certain types of HPV can cause cancers of the cervix, vagina, vulva, anus, penis, and oropharynx. Human papillomavirus vaccines are being used to prevent some of these cancers. They are also being used to prevent genital warts and abnormal lesions that may lead to some of these cancers. Also called HPV vaccine.
    More Information
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  human participant protection regulations: (HYOO-mun par-TIH-sih-punt proh-TEK-shun REH-gyoo-LAY-shunz)
    Pronunciation of dictionary term "human participant protection regulations"
    Laws set by the U.S. Department of Health and Human Services (DHHS) to protect a person from risks in research studies that any federal agency or department has a part in. Also called 45 CFR 46, 45 Code of Federal Regulations Part 46, and Protection of Human Subjects.
  human T-cell leukemia virus type 1: (HYOO-mun T-sel loo-KEE-mee-uh VY-rus...)
    Pronunciation of dictionary term "human T-cell leukemia virus type 1"
    A type of virus that infects T cells (a type of white blood cell) and can cause leukemia and lymphoma. Human T-cell leukemia virus type 1 is spread by sharing syringes or needles, through blood transfusions or sexual contact, and from mother to child during birth or breast-feeding. Also called HTLV-1 and human T-cell lymphotropic virus type 1.
  human T-cell lymphotropic virus type 1: (HYOO-mun T-sel LIM-foh-TROH-pik VY-rus...)
    Pronunciation of dictionary term "human T-cell lymphotropic virus type 1"
    A type of virus that infects T cells (a type of white blood cell) and can cause leukemia and lymphoma. Human T-cell lymphotropic virus type 1 is spread by sharing syringes or needles, through blood transfusions or sexual contact, and from mother to child during birth or breast-feeding. Also called HTLV-1 and human T-cell leukemia virus type 1.
  humanized monoclonal antibody: (HYOO-muh-nized MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "humanized monoclonal antibody"
    A type of antibody made in the laboratory by combining a human antibody with a small part of a mouse or rat monoclonal antibody. The mouse or rat part of the antibody binds to the target antigen, and the human part makes it less likely to be destroyed by the body's immune system.
  humanized monoclonal antibody MEDI-522: (HYOO-muh-nized MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "humanized monoclonal antibody MEDI-522"
    A substance being studied in the treatment of some types of cancer and other conditions. Humanized monoclonal antibody MEDI-522 binds to a protein on the surface of blood vessels and may prevent the growth of new blood vessels that tumors need to grow. It may also prevent the spread of cancer. It is a type of antiangiogenesis agent, a type of metastasis inhibitor, and a type of monoclonal antibody. Also called Abegrin, etaracizumab, and MEDI-522.
  HuMax-CD20: A drug used alone or with other drugs to treat certain types of chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. HuMax-CD20 binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of leukemia and lymphoma cells. HuMax-CD20 may block CD20 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Arzerra and ofatumumab.
    More Information
    - Ofatumumab (https://www.cancer.gov/about-cancer/treatment/drugs/ofatumumab)
  humidifier: (hyoo-MIH-dih-fy-er)
    Pronunciation of dictionary term "humidifier"
    A machine that puts moisture in the air.
  humor therapy: (HYOO-mer THAYR-uh-pee)
    Pronunciation of dictionary term "humor therapy"
    A type of therapy that uses humor to help relieve pain and stress and improve a person’s sense of well-being. It may be used to help people cope with a serious disease, such as cancer. Humor therapy may include laughter exercises, clowns, and comedy movies, books, games, and puzzles. It is a type of complementary therapy. Also called laughter therapy.
  Hurthle cell neoplasm: (HEERT-leh...NEE-oh-PLA-zum)
    Pronunciation of dictionary term "Hurthle cell neoplasm"
    An uncommon type of thyroid tumor that can be benign or malignant.
  hyaluronidase: (HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "hyaluronidase"
    An enzyme that breaks down a substance in the body called hyaluronic acid. Hyaluronic acid is found throughout the body in connective tissue, skin, and fluids in the joints and inside the eye. It causes fluids to have a jelly-like thickness, which can help moisten and protect tissues and joints. In medicine, hyaluronidase is made in the laboratory and given with other drugs by injection under the skin to treat certain conditions. Using hyaluronidase to break down hyaluronic acid helps make the fluids and connective tissue thinner so the drugs can move more easily into the tissues.
  Hycamtin: (hy-KAM-tin)
    Pronunciation of dictionary term "Hycamtin"
    A drug used alone or with other drugs to treat certain types of ovarian cancer, small cell lung cancer, and cervical cancer. It is also being studied in the treatment of other types of cancer. Hycamtin blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called topotecan hydrochloride.
    More Information
    - Topotecan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/topotecanhydrochloride)
  hydatidiform mole: (HY-duh-TIH-dih-form...)
    Pronunciation of dictionary term "hydatidiform mole"
    A slow-growing tumor that develops from trophoblastic cells (cells that help an embryo attach to the uterus and help form the placenta) after fertilization of an egg by a sperm. A hydatidiform mole contains many cysts (sacs of fluid). It is usually benign (not cancer) but it may spread to nearby tissues (invasive mole). It may also become a malignant tumor called choriocarcinoma. Hydatidiform mole is the most common type of gestational trophoblastic tumor. Also called molar pregnancy.
  hydration: (hy-DRAY-shun)
    Pronunciation of dictionary term "hydration"
    The process of combining with water. In medicine, the process of giving fluids needed by the body.
  hydrazine sulfate: (HY-druh-ZEEN SUL-fayt)
    Pronunciation of dictionary term "hydrazine sulfate"
    A substance that has been studied as a treatment for cancer and as a treatment for cachexia (body wasting) associated with advanced cancer.
    More Information
    - Hydrazine Sulfate
  Hydrea: (hy-DREE-uh)
    Pronunciation of dictionary term "Hydrea"
    A drug that contains the active ingredient hydroxyurea and is used alone or with other anticancer drugs or radiation therapy to treat certain types of chronic myelogenous leukemia and head and neck cancer. It is also being studied in the treatment of other conditions and types of cancer. Hydrea stops cells from making DNA and may kill cancer cells. It may also make cancer cells easier to kill with radiation therapy. Hydrea is a type of antimetabolite.
    More Information
    - Hydroxyurea (https://www.cancer.gov/about-cancer/treatment/drugs/hydroxyurea)
  hydrocarbon: (HY-droh-KAR-bun)
    Pronunciation of dictionary term "hydrocarbon"
    A substance made of only hydrogen and carbon. Examples of hydrocarbons are coal, petroleum, natural gas and tar. They are used as energy sources. Being exposed to hydrocarbons may increase the risk of certain types of cancer.
  hydrocephalus: (HY-droh-SEH-fuh-lus)
    Pronunciation of dictionary term "hydrocephalus"
    The abnormal buildup of cerebrospinal fluid in the ventricles of the brain.
  hydrocodone bitartrate: (HY-droh-KOH-done by-TAR-trayt)
    Pronunciation of dictionary term "hydrocodone bitartrate"
    A drug used to treat moderate to severe pain and cough. Hydrocodone bitartrate is made in a lab by modifying codeine, a natural substance found in the opium poppy plant. It works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and changes how the body responds to pain. It also helps decrease activity in the part of the brain that causes coughing. Hydrocodone bitartrate is a type of antitussive (cough suppressant) and a type of semi-synthetic opioid agonist that works as an analgesic (pain reliever).
    More Information
    - Cancer Pain
  hydrocortisone: (HY-droh-KOR-tih-sone)
    Pronunciation of dictionary term "hydrocortisone"
    A drug used to relieve the symptoms of certain hormone shortages and to suppress an immune response.
  hydrogen cyanide: (HY-droh-jen SY-uh-nide)
    Pronunciation of dictionary term "hydrogen cyanide"
    A liquid or gas form of cyanide. Cyanide is a poisonous chemical found in some foods and plants, tobacco smoke, and when certain substances are burned. It is used to make products, such as paper, fabric, and plastic, and is used as a pesticide. Cyanide keeps cells in the body from using oxygen, so they die. Exposure to cyanide may cause serious health problems, including death.
  hydrogen peroxide: (HY-droh-jen peh-ROK-side)
    Pronunciation of dictionary term "hydrogen peroxide"
    A chemical used in bleaches, dyes, cleansers, antiseptics, and disinfectants. In a concentrated form, it is toxic and irritating to tissues.
  hydrolysis: (hy-DRAH-lih-sis)
    Pronunciation of dictionary term "hydrolysis"
    A chemical reaction that uses water to break down a compound.
  hydromorphone hydrochloride: (HY-droh-MOR-fone HY-droh-KLOR-ide)
    Pronunciation of dictionary term "hydromorphone"
    A drug used to treat moderate to severe pain. It may also be used to treat certain types of cough. Hydromorphone hydrochloride is made from morphine and binds to opioid receptors in the central nervous system. It is a type of opioid and a type of analgesic agent. Also called Dilaudid, Exalgo, and Hydrostat IR.
  hydronephrosis: (HY-droh-neh-FROH-sis)
    Pronunciation of dictionary term "hydronephrosis"
    Abnormal enlargement of a kidney, which may be caused by blockage of the ureter (such as by a kidney stone) or chronic kidney disease that prevents urine from draining into the bladder.
  Hydrostat IR: (HY-droh-STAT …)
    Pronunciation of dictionary term "Hydrostat IR"
    A drug used to treat moderate to severe pain. It may also be used to treat certain types of cough. Hydrostat IR is made from morphine and binds to opioid receptors in the central nervous system. It is a type of opioid and a type of analgesic agent. Also called Dilaudid, Exalgo, and hydromorphone hydrochloride.
  hydroureter: (HY-droh-YER-eh-ter)
    Pronunciation of dictionary term "hydroureter"
    Abnormal enlargement of the ureter caused by any blockage that prevents urine from draining into the bladder.
  hydroxychloroquine: (hy-DROK-see-KLOR-oh-kwin)
    Pronunciation of dictionary term "hydroxychloroquine"
    A substance that decreases immune responses in the body. It is used to treat some autoimmune diseases, and is being studied as a treatment for graft-versus-host disease. Hydroxychloroquine belongs to the family of drugs called antiprotozoals.
  hydroxydaunorubicin: (hy-DROK-see-DAW-noh-ROO-bih-sin)
    Pronunciation of dictionary term "hydroxydaunorubicin"
    A drug that comes from the bacterium Streptomyces peucetius and is used alone or with other drugs to treat many types of cancer, including leukemia, lymphoma, neuroblastoma, sarcoma, Wilms tumor, and certain cancers of the lung, breast, stomach, ovary, thyroid, and bladder. It is also being studied in the treatment of other types of cancer. Hydroxydaunorubicin damages the cell’s DNA and may kill cancer cells. It also blocks a certain enzyme needed for cell division and DNA repair. Hydroxydaunorubicin is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called Adriamycin and doxorubicin hydrochloride.
    More Information
    - Doxorubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
  hydroxymethylglutaryl-coenzyme A reductase inhibitor: (hy-DROK-see-MEH-thul-GLOO-tuh-ril-koh-EN-zime A ree-DUK-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "hydroxymethylglutaryl-coenzyme A reductase inhibitor"
    A substance that blocks an enzyme needed by the body to make cholesterol and lowers the amount of cholesterol in the blood. Hydroxymethylglutaryl-coenzyme A reductase inhibitor drugs are called statins. Also called HMG-CoA reductase inhibitor.
  hydroxyurea: (hy-DROK-see-yoo-REE-uh)
    Pronunciation of dictionary term "hydroxyurea"
    A drug used alone or with other anticancer drugs or radiation therapy under the brand name Hydrea to treat certain types of chronic myelogenous leukemia and head and neck cancer and under the brand name Droxia to treat certain patients with sickle cell anemia. It is also being studied in the treatment of other conditions and types of cancer. Hydroxyurea stops cells from making DNA and may kill cancer cells. It may also make cancer cells easier to kill with radiation therapy. Hydroxyurea may also help keep abnormal red blood cells from forming, which may reduce the number of painful sickle cell crises and the need for blood transfusions. Hydroxyurea is a type of antimetabolite.
    More Information
    - Hydroxyurea (https://www.cancer.gov/about-cancer/treatment/drugs/hydroxyurea)
  hygiene: (HY-jeen)
    Pronunciation of dictionary term "hygiene"
    The science of health, and the practice of cleanliness that promotes good health and well-being.
  hyper-CVAD: (HY-per ...)
    Pronunciation of dictionary term "hyper-CVAD"
    An abbreviation for a chemotherapy combination used to treat some types of acute lymphoblastic leukemia (ALL) and non-Hodgkin lymphoma (NHL). Hyper-CVAD includes the drugs cyclophosphamide, vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and dexamethasone. It also includes the drugs methotrexate and cytarabine. It is given as hyperfractionated therapy, in which the total dose of the drugs is divided into small doses and given more than once a day. Also called hyper-CVAD regimen.
    More Information
    - Hyper-CVAD (https://www.cancer.gov/about-cancer/treatment/drugs/Hyper-CVAD)
  hyper-CVAD regimen: (HY-per ... REH-jih-men)
    Pronunciation of dictionary term "hyper-CVAD regimen"
    An abbreviation for a chemotherapy combination used to treat some types of acute lymphoblastic leukemia (ALL) and non-Hodgkin lymphoma (NHL). Hyper-CVAD regimen includes the drugs cyclophosphamide, vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and dexamethasone. It also includes the drugs methotrexate and cytarabine. It is given as hyperfractionated therapy, in which the total dose of the drugs is divided into small doses and given more than once a day. Also called hyper-CVAD.
    More Information
    - Hyper-CVAD (https://www.cancer.gov/about-cancer/treatment/drugs/Hyper-CVAD)
  hyperactivity: (HY-per-ak-TIH-vih-tee)
    Pronunciation of dictionary term "hyperactivity"
    A higher than normal level of activity. Hyperactivity can be used to describe the increased action of a body function, such as hormone production, or behavior. A person who is hyperactive may seem to be always moving or fidgeting, impulsive, unable to concentrate, and talking too much.
  hyperalgesia: (HY-per-al-JEE-zee-uh)
    Pronunciation of dictionary term "hyperalgesia"
    An increased sensitivity to feeling pain and an extreme response to pain. Hyperalgesia may occur when there is damage to the nerves or chemical changes to the nerve pathways involved in sensing pain. This may be caused by tissue injury or inflammation or by taking certain drugs, such as opioids, for chronic pain. People with hyperalgesia tend to feel extreme pain even though an injury or medical condition has not gotten worse. This pain may get worse over time, and it may extend to other areas of the body. It may also become a new or different type of pain than the original pain.
    More Information
    - Cancer Pain (Health Professional Version) (https://www.cancer.gov/about-cancer/treatment/side-effects/pain/pain-hp-pdq)
  hyperalimentation: (HY-per-A-lih-men-TAY-shun)
    Pronunciation of dictionary term "hyperalimentation"
    A form of nutritional support that is given directly into the bloodstream through a catheter placed into a vein. Hyperalimentation bypasses the digestive system and may be given when a person is not able to eat or drink by mouth or has a disease or condition that affects their ability to absorb nutrients through the digestive system. There are two types of hyperalimentation: partial parenteral nutrition (PPN) and total parenteral nutrition (TPN). PPN is supplemental nutrition that is given when a person cannot get enough calories or the right amount of nutrients that their body needs from the food they are eating. TPN is complete nutrition that provides all the calories, proteins, carbohydrates, fats, vitamins, and minerals that a person needs when they cannot digest food. Also called parenteral nutrition.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  hyperbaric oxygen: (HY-per-BAYR-ik OK-sih-jen)
    Pronunciation of dictionary term "hyperbaric oxygen"
    Oxygen that is given at a pressure that is higher than the pressure of the atmosphere at sea level. In medicine, breathing hyperbaric oxygen increases the amount of oxygen in the body. It is used in treating certain kinds of wounds, injuries, and infections. It is also used to treat carbon monoxide poisoning and other conditions in which the tissues are not getting enough oxygen. It is being studied in the treatment of some types of cancer. Hyperbaric oxygen may increase the amount of oxygen in cancer cells, which may make them easier to kill with radiation therapy and chemotherapy. It is a type of radiosensitizing agent and a type of chemosensitizing agent.
  hyperbilirubinemia: (HY-per-bih-lih-ROO-bih-NEE-mee-uh)
    Pronunciation of dictionary term "hyperbilirubinemia"
    Higher-than-normal amount of bilirubin in the blood. Bilirubin is a substance formed when red blood cells break down.
  hypercalcemia: (HY-per-kal-SEE-mee-uh)
    Pronunciation of dictionary term "hypercalcemia"
    Higher than normal levels of calcium in the blood. Some types of cancer increase the risk of hypercalcemia.
  hypercortisolism: (HY-per-KOR-tih-SOL-ih-zum)
    Pronunciation of dictionary term "hypercortisolism"
    A condition in which there is too much cortisol (a hormone made by the outer layer of the adrenal gland) in the body. Hypercortisolism may be caused by taking too many steroid drugs or by certain types of tumors. Tumors that make adrenocorticotropic hormone (ACTH) cause the adrenal gland to make too much cortisol. Symptoms of hypercortisolism include a round face, thin arms and legs, severe fatigue and muscle weakness, high blood pressure, high blood sugar, purple or pink stretch marks on the skin, and weight gain, especially in the abdomen. Also called Cushing syndrome.
  hypercytokinemia: (HY-per-SY-toh-kih-NEE-mee-uh)
    Pronunciation of dictionary term "hypercytokinemia"
    A severe immune reaction in which the body releases too many cytokines into the blood too quickly. Cytokines play an important role in normal immune responses, but having a large amount of them released in the body all at once can be harmful. Hypercytokinemia can occur as a result of an infection, autoimmune condition, or other disease. It may also occur after treatment with some types of immunotherapy. Signs and symptoms include high fever, inflammation (redness and swelling), and severe fatigue and nausea. Sometimes, hypercytokinemia may be severe or life threatening and lead to multiple organ failure. Also called cytokine storm.
  hyperdiploid: (HY-per-DIP-loyd)
    Pronunciation of dictionary term "hyperdiploid"
    A term used to describe cells that have a higher-than-normal amount of DNA, such as having more than the usual number of chromosomes. Most human cells, except for egg and sperm cells, normally contain 46 chromosomes (23 pairs) in each cell. Some types of cancer cells, such as neuroblastoma cells or leukemia cells, may be hyperdiploid. Knowing whether cancer cells are hyperdiploid may help plan treatment and estimate prognosis.
  hyperfractionated radiation therapy: (HY-per-FRAK-shuh-NAY-ted RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "hyperfractionated radiation therapy"
    Radiation treatment in which the total dose of radiation is divided into small doses and treatments are given more than once a day. Hyperfractionated radiation therapy is given over the same period of time (days or weeks) as standard radiation therapy. Also called superfractionated radiation therapy.
  hyperfractionation: (HY-per-FRAK-shuh-NAY-shun)
    Pronunciation of dictionary term "hyperfractionation"
    A treatment schedule in which the total dose of radiation or chemotherapy is divided into small doses and treatments are given more than once a day.
  hyperglycemia: (HY-per-gly-SEE-mee-uh)
    Pronunciation of dictionary term "hyperglycemia"
    Higher than normal amount of glucose (a type of sugar) in the blood. Hyperglycemia can be a sign of diabetes or other conditions. Also called high blood sugar.
  Hypericum perforatum: (hy-PAYR-ih-kum per-fuh-RAY-tum)
    Pronunciation of dictionary term "Hypericum perforatum"
    An herbal product sold as an over-the-counter treatment for depression. It is being studied for its ability to lessen certain side effects of cancer treatment. Also called St. John's wort.
    More Information
    - Cancer Therapy Interactions With Foods and Dietary Supplements
  hyperkeratosis: (HY-per-KAYR-uh-TOH-sis)
    Pronunciation of dictionary term "hyperkeratosis"
    A condition marked by thickening of the outer layer of the skin, which is made of keratin (a tough, protective protein). It can result from normal use (corns, calluses), chronic inflammation (eczema), or genetic disorders (X-linked ichthyosis, ichthyosis vulgaris).
  hypernephroma: (HY-per-neh-FROH-muh)
    Pronunciation of dictionary term "hypernephroma"
    Cancer that begins in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Hypernephroma is the most common type of kidney cancer in adults. Also called renal cell adenocarcinoma, renal cell cancer, and renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  hyperparathyroidism: (HY-per-PAYR-uh-THY-roy-dih-zum)
    Pronunciation of dictionary term "hyperparathyroidism"
    A condition in which the parathyroid gland (one of four pea-sized organs found on the thyroid) makes too much parathyroid hormone. This causes a loss of calcium from the bones and an increased level of calcium in the blood. Symptoms include bone pain and kidney problems.
  hyperpigmentation: (HY-per-pig-men-TAY-shun)
    Pronunciation of dictionary term "hyperpigmentation"
    A common, usually harmless condition in which patches of skin are darker than the surrounding skin. It occurs when special cells in the skin make too much of the pigment called melanin. Hyperpigmentation may appear as freckles, age spots, or larger areas of darkened skin. Hyperpigmentation may be caused by injury or inflammation of the skin, sun damage, abnormal skin growths, hormone changes, pregnancy, or other medical conditions. Certain medicines, including some anticancer drugs, can also cause hyperpigmentation.
  hyperplasia: (HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "hyperplasia"
    An increase in the number of cells in an organ or tissue. These cells appear normal under a microscope. They are not cancer, but may become cancer.
    Normal cells may become cancer cells. Before cancer cells form in tissues of the body, the cells go through abnormal changes called hyperplasia and dysplasia. In hyperplasia, there is an increase in the number of cells in an organ or tissue that appear normal under a microscope. In dysplasia, the cells look abnormal under a microscope but are not cancer. Hyperplasia and dysplasia may or may not become cancer.
    Drawing of four panels showing how normal cells may become cancer cells. The first panel shows normal cells. The second and third panels show abnormal cell changes called hyperplasia and dysplasia. The fourth panel shows cancer cells.
  hypersensitivity: (HY-per-SEN-sih-tih-vih-tee)
    Pronunciation of dictionary term "hypersensitivity"
    An exaggerated response by the immune system to a drug or other substance.
  hypertension: (HY-per-TEN-shun)
    Pronunciation of dictionary term "hypertension"
    A blood pressure of 140/90 or higher. Hypertension usually has no symptoms. It can harm the arteries and cause an increase in the risk of stroke, heart attack, kidney failure, and blindness. Also called high blood pressure.
  hyperthermia: (HY-per-THER-mee-uh)
    Pronunciation of dictionary term "hyperthermia"
    Abnormally high body temperature. This may be caused as part of treatment, by an infection, or by exposure to heat.
    More Information
    - Hyperthermia to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/hyperthermia)
  hyperthermia therapy: (HY-per-THER-mee-uh THAYR-uh-pee)
    Pronunciation of dictionary term "hyperthermia therapy"
    A type of treatment in which body tissue is exposed to high temperatures to damage and kill cancer cells or to make cancer cells more sensitive to the effects of radiation and certain anticancer drugs.
    More Information
    - Hyperthermia to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/hyperthermia)
    Hyperthermia is a type of treatment in which body tissue is exposed to high temperatures to help damage and kill cancer cells or to make them easier to kill with radiation therapy or chemotherapy. Different techniques may be used for hyperthermia treatment, including placing the entire body or part of the body in a heated chamber or machine, as shown.
    Hyperthermia treatment; drawing shows a woman lying on a table with a dome-shaped machine around the middle part of the body. The machine delivers heat directly to the treatment area.
  hyperthermic intraperitoneal chemotherapy: (HY-per-THER-mik IN-truh-PAYR-ih-toh-NEE-ul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "hyperthermic intraperitoneal chemotherapy"
    A treatment used during surgery in which a heated solution containing anticancer drugs is infused directly into the abdominal cavity through a thin tube. After removal of as much tumor tissue as possible with surgery, hyperthermic intraperitoneal chemotherapy is given to kill any remaining tumor cells. It is most often used to treat cancers that have spread to the peritoneum (the lining of the abdominal cavity). Also called CHPP, continuous hyperthermic peritoneal perfusion, and HIPEC.
  hyperthermic perfusion: (HY-per-THER-mik per-FYOO-zhun)
    Pronunciation of dictionary term "hyperthermic perfusion"
    A procedure in which a warmed solution containing anticancer drugs is used to bathe, or is passed through the blood vessels of, the tissue or organ containing the tumor.
  hyperthyroidism: (HY-per-THY-roy-dih-zum)
    Pronunciation of dictionary term "hyperthyroidism"
    A condition that occurs when the thyroid gland makes more thyroid hormones than the body needs. Thyroid hormones control the way the body uses energy and affect the body’s metabolism. Hyperthyroidism may be caused by an autoimmune disorder called Graves’ disease, benign lumps in the thyroid gland, and inflammation of the thyroid gland. It may also be caused by consuming too much iodine in the diet or by taking too much thyroid hormone medicine. Signs and symptoms include weight loss, fatigue, rapid or irregular heartbeat, sweating, diarrhea, nervousness, mood swings, shaky hands, trouble sleeping, trouble tolerating heat, muscle weakness, and a goiter (an enlarged thyroid gland that may cause the bottom of the neck to look swollen). Hyperthyroidism can usually be controlled with treatment. Also called overactive thyroid.
  hyperuricemia: (HY-per-YOO-rih-SEE-mee-uh)
    Pronunciation of dictionary term "hyperuricemia"
    A buildup of uric acid (a byproduct of metabolism) in the blood. Hyperuricemia is a side effect of some anticancer drugs.
  hypervascular: (HY-per-VAS-kyoo-ler)
    Pronunciation of dictionary term "hypervascular"
    Having a large number of blood vessels.
  hypnosis: (hip-NOH-sis)
    Pronunciation of dictionary term "hypnosis"
    A trance-like state in which a person becomes more aware and focused on particular thoughts, feelings, images, sensations, or behaviors. While under hypnosis, a person may feel calm, relaxed, and more open to suggestion. Hypnosis is usually done with the help of a specially trained therapist. It may be used to help relieve stress, anxiety, and pain, and to help a person quit smoking or lose weight. Hypnosis is a type of complementary and alternative medicine (CAM).
  hypofractionated radiation therapy: (HY-poh-FRAK-shuh-NAY-ted RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "hypofractionated radiation therapy"
    Radiation treatment in which the total dose of radiation is divided into large doses and treatments are given once a day or less often. Hypofractionated radiation therapy is given over a shorter period of time (fewer days or weeks) than standard radiation therapy.
  hypofractionation: (HY-poh-FRAK-shuh-NAY-shun)
    Pronunciation of dictionary term "hypofractionation"
    A treatment schedule in which the total dose of radiation is divided into large doses and treatments are given once a day or less often.
  hypogammaglobulinemia: (HY-poh-GA-muh-GLAH-byoo-lih-NEE-mee-uh)
    Pronunciation of dictionary term "hypogammaglobulinemia"
    A condition in which the level of immunoglobulins (antibodies) in the blood is low and the risk of infection is high.
  hypoglycemia: (HY-poh-gly-SEE-mee-uh)
    Pronunciation of dictionary term "hypoglycemia"
    Abnormally low blood sugar.
  hypohidrosis: (HY-poh-hih-DROH-sis)
    Pronunciation of dictionary term "hypohidrosis"
    A rare condition in which the sweat glands make little or no sweat. It can affect the whole body or a small part of the body. Hypohidrosis may be caused by severe burns, radiation, infection, inflammation, or other injuries to the skin. It may also be caused by certain medicines and some conditions that affect the skin, nerves, connective tissue, or sweat glands. It may be inherited as part of a genetic condition or develop later in life. Also called anhidrosis.
  hypomagnesemia: (HY-poh-MAG-neh-SEE-mee-uh)
    Pronunciation of dictionary term "hypomagnesemia"
    Lower-than-normal amount of magnesium in the blood.
  hyponatremia: (HY-poh-nuh-TREE-mee-uh)
    Pronunciation of dictionary term "hyponatremia"
    Lower-than-normal amount of sodium in the blood.
  hypopharyngeal cancer: (HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "hypopharyngeal cancer"
    Cancer that forms in tissues of the hypopharynx (the bottom part of the throat). The most common type is squamous cell carcinoma (cancer that begins in flat cells lining the hypopharynx).
    More Information
    - Hypopharyngeal Cancer Treatment
    Hypopharyngeal cancer forms in the tissues of the hypopharynx (the bottom part of the throat). It may spread to nearby tissues or to cartilage around the thyroid or trachea, the bone under the tongue (hyoid bone), the thyroid, the trachea, the larynx, or the esophagus. It may also spread to the lymph nodes in the neck, the carotid artery, the tissues around the upper part of the spinal column, the lining of the chest cavity, and to other parts of the body (not shown).
    Drawing shows areas where hypopharyngeal cancer may form or spread, including the bone under the tongue (hyoid bone), cartilage around the thyroid and trachea, the thyroid, the trachea, and the esophagus. Also shown are the upper part of the spinal column, the carotid artery, lymph nodes in the neck, and lining of the chest cavity. An inset shows a cross section of the hypopharynx, larynx, esophagus, and trachea.
  hypopharynx: (HY-poh-FAYR-inx)
    Pronunciation of dictionary term "hypopharynx"
    The bottom part of the throat. Cancer of the hypopharynx is also known as hypopharyngeal cancer.
    More Information
    - Hypopharyngeal Cancer Treatment
    Hypopharyngeal cancer forms in the tissues of the hypopharynx (the bottom part of the throat). It may spread to nearby tissues or to cartilage around the thyroid or trachea, the bone under the tongue (hyoid bone), the thyroid, the trachea, the larynx, or the esophagus. It may also spread to the lymph nodes in the neck, the carotid artery, the tissues around the upper part of the spinal column, the lining of the chest cavity, and to other parts of the body (not shown).
    Drawing shows areas where hypopharyngeal cancer may form or spread, including the bone under the tongue (hyoid bone), cartilage around the thyroid and trachea, the thyroid, the trachea, and the esophagus. Also shown are the upper part of the spinal column, the carotid artery, lymph nodes in the neck, and lining of the chest cavity. An inset shows a cross section of the hypopharynx, larynx, esophagus, and trachea.
  hypophosphatemia: (HY-poh-FOS-fuh-TEE-mee-uh)
    Pronunciation of dictionary term "hypophosphatemia"
    Lower-than-normal amount of phosphorus in the blood.
  hypopigmentation: (HY-poh-pig-men-TAY-shun)
    Pronunciation of dictionary term "hypopigmentation"
    A condition in which the skin is lighter in color than normal. It occurs when special cells in the skin do not make enough of the pigment called melanin. Hypopigmentation can affect a small area of the skin or it can be widespread. It usually appears as lighter than normal colored patches on the skin or as areas on the skin that appear white. Hypopigmentation may be caused by injury, inflammation, or infection of the skin; some medical conditions; or certain medicines.
  hypospadias: (HY-poh-SPAY-dee-us)
    Pronunciation of dictionary term "hypospadias"
    A birth defect in which the opening of the urethra (the tube through which urine leaves the body) is not in its normal place. In males with hypospadias, the urethra opens on the underside of the penis or between the anus and the scrotum. In females with hypospadias, it opens into the vagina. Hypospadias is much more common in males than in females, and can be corrected by surgery. Children with hypospadias have an increased risk of developing Wilms tumor (a type of kidney cancer).
  hypotension: (HY-poh-TEN-shun)
    Pronunciation of dictionary term "hypotension"
    Abnormally low blood pressure.
  hypothalamus: (HY-poh-THA-luh-mus)
    Pronunciation of dictionary term "hypothalamus"
    The area of the brain that controls body temperature, hunger, and thirst.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  hypothesis: (hy-PAH-theh-sis)
    Pronunciation of dictionary term "hypothesis"
    A tentative proposal made to explain certain observations or facts that requires further investigation to be verified.
  hypothyroidism: (HY-poh-THY-roy-dih-zum)
    Pronunciation of dictionary term "hypothyroidism"
    Too little thyroid hormone. Symptoms include weight gain, constipation, dry skin, and sensitivity to the cold. Also called underactive thyroid.
  hypotrichosis: (HY-poh-trih-KOH-sis)
    Pronunciation of dictionary term "hypotrichosis"
    A rare condition in which there is little or no hair growth on the head, including the brows above the eyes and the edge of the eyelids, or other areas of the body where hair normally grows. Hair in the affected areas usually stays short and is dry and rough. It may also be tightly curled, lighter in color, and break easily. Hypotrichosis is usually congenital (present at birth) and is linked to several different genetic syndromes.
  hypoxemia: (HY-pok-SEE-mee-uh)
    Pronunciation of dictionary term "hypoxemia"
    A condition in which there is not enough oxygen in the blood.
  hypoxia: (hy-POK-see-uh)
    Pronunciation of dictionary term "hypoxia"
    A condition in which there is a decrease in the oxygen supply to a tissue. In cancer treatment, the level of hypoxia in a tumor may help predict the response of the tumor to the treatment.
  hypoxia-inducible factor: (hy-POK-see-uh-in-DOO-sih-bul FAK-ter)
    Pronunciation of dictionary term "hypoxia-inducible factor"
    One of a group of proteins that play an important role in how cells respond to changing levels of oxygen. When oxygen levels in cells are low, hypoxia-inducible factors activate certain genes involved in cell growth and survival. This allows the cells to function and survive even in low oxygen conditions. Hypoxia-inducible factors may be made in larger than normal amounts by some types of cancer cells. This may cause cancer cells to grow and spread to other parts of the body. Also called HIF.
  hypoxic: (hy-POK-sik)
    Pronunciation of dictionary term "hypoxic"
    Having too little oxygen.
  hysterectomy: (HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "hysterectomy"
    Surgery to remove the uterus, and sometimes surrounding organs and tissues. There are several different types of hysterectomy. When only the uterus is removed, it is called a partial hysterectomy. When the uterus and cervix are removed, it is called a total hysterectomy. When the uterus, cervix, part of the vagina, and a wide area of ligaments and tissues around these organs are removed, it is called a radical hysterectomy. These procedures may be done through the vagina (with no incisions in the abdomen) or through an incision (cut) in the abdomen.
  Hytrin: (HY-trin)
    Pronunciation of dictionary term "Hytrin"
    A drug used to treat urinary problems caused by an enlarged prostate. It is also used to treat high blood pressure and is being studied in the treatment of other conditions. Hytrin relaxes muscle tissue in blood vessels and in the prostate. It is a type of alpha blocker. Also called terazosin hydrochloride.
  ibandronate: (i-BAN-droh-nayt)
    Pronunciation of dictionary term "ibandronate"
    A drug that is used to prevent and treat osteoporosis, and is being studied in the treatment of cancer that has spread to the bones. It belongs to the family of drugs called bisphosphonates.
  IBMFS: Inherited bone marrow failure syndrome. A rare disorder in which a person’s bone marrow is unable to make enough blood cells and there is a family history of the same disorder. There are several different inherited bone marrow failure syndromes. Patients with an IBMFS are at high risk of forming acute leukemia or certain solid tumors. Also called inherited bone marrow failure syndrome.
  Ibrance: (I-brans)
    Pronunciation of dictionary term "Ibrance"
    A drug used to treat women and men with certain types of hormone-receptor positive, HER2-negative breast cancer that is advanced or has spread. It is also being studied in the treatment of other types of cancer. Ibrance blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Also called palbociclib.
    More Information
    - Palbociclib (https://www.cancer.gov/about-cancer/treatment/drugs/palbociclib)
  ibritumomab tiuxetan: (ih-brih-TOO-moh-mab ty-UK-seh-tan)
    Pronunciation of dictionary term "ibritumomab tiuxetan"
    A drug used to treat adults with certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Ibritumomab tiuxetan contains a monoclonal antibody that binds to a protein called CD20, which is found on B cells and some types of lymphoma cells. It also contains the compound tiuxetan, which allows certain radioactive substances to be attached to the monoclonal antibody. This may help kill cancer cells. Ibritumomab tiuxetan is a type of monoclonal antibody and a type of immunoconjugate. Also called Zevalin.
    More Information
    - Ibritumomab Tiuxetan (https://www.cancer.gov/about-cancer/treatment/drugs/ibritumomabtiuxetan)
  ibrutinib: (i-BROO-tih-nib)
    Pronunciation of dictionary term "ibrutinib"
    A drug used alone or with other drugs to treat adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, or Waldenstrom macroglobulinemia (a type of non-Hodgkin lymphoma). It is also used to treat adults and children aged 1 year and older with chronic graft versus host disease. It is also being studied in the treatment of other types of cancer. Ibrutinib blocks a protein called BTK, which may help keep cancer cells from growing. It may also lower the body’s immune response. Ibrutinib is a type of tyrosine kinase inhibitor. Also called Imbruvica.
    More Information
    - Ibrutinib (https://www.cancer.gov/about-cancer/treatment/drugs/ibrutinib)
  IBS: A disorder of the intestines commonly marked by abdominal pain, bloating, and changes in a person’s bowel habits. This may include diarrhea or constipation, or both, with one occurring after the other. Also called irritable bowel syndrome, irritable colon, mucus colitis, and spastic colon.
  ibuprofen: (I-byoo-PROH-fen)
    Pronunciation of dictionary term "ibuprofen"
    A drug used to treat fever, swelling, pain, and redness by preventing the body from making a substance that causes inflammation. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called Advil and Motrin.
  ICD: A small device used to correct a heartbeat that is abnormal (too fast, too slow, or irregular). The device is placed by surgery in the chest or abdomen. Wires are passed through a vein to connect the device to the heart. When it detects abnormal heartbeats, it sends an electrical shock to the heart to restore the heartbeat to normal. Also called implantable cardioverter-defibrillator.
  ICE: An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin and Hodgkin lymphomas that have come back and do not respond to other treatments. It includes the drugs ifosfamide, carboplatin, and etoposide phosphate. Also called ICE regimen.
    More Information
    - ICE (https://www.cancer.gov/about-cancer/treatment/drugs/ICE)
  ICE regimen: (… REH-jih-men)
    Pronunciation of dictionary term "ICE regimen"
    An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin and Hodgkin lymphomas that have come back and do not respond to other treatments. It includes the drugs ifosfamide, carboplatin, and etoposide phosphate. Also called ICE.
    More Information
    - ICE (https://www.cancer.gov/about-cancer/treatment/drugs/ICE)
  ICI 182780: A drug used to treat certain types of breast cancer. It is used alone or with ribociclib succinate in postmenopausal women who have not been treated with hormone therapy or whose disease got worse after treatment with hormone therapy. It is also used with palbociclib or abemaciclib in women whose disease got worse after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. ICI 182780 binds to proteins called estrogen receptors, which are found in some breast cancer cells. These proteins may cause cancer cells to grow. ICI 182780 blocks these proteins and may keep cancer cells from growing. It is a type of antiestrogen. Also called Faslodex and fulvestrant.
    More Information
    - Fulvestrant (https://www.cancer.gov/about-cancer/treatment/drugs/fulvestrant)
  ICI D1694: An anticancer drug that stops tumor cells from growing by blocking the ability of cells to make DNA. It belongs to the family of drugs called thymidylate synthase inhibitors. Also called raltitrexed.
  Iclusig: (i-KLOO-sig)
    Pronunciation of dictionary term "Iclusig"
    A drug used alone or with other drugs to treat adults with certain types of chronic myelogenous leukemia or Philadelphia chromosome–positive acute lymphoblastic leukemia. It is used in patients whose cancer is newly diagnosed, has the T315I mutation, or cannot be treated with other kinase inhibitors. It is also being studied in the treatment of other types of cancer. Iclusig blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Iclusig is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called ponatinib hydrochloride.
    More Information
    - Ponatinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/ponatinibhydrochloride)
  Idamycin PFS: (I-duh-MY-sin ...)
    Pronunciation of dictionary term "Idamycin PFS"
    A drug used with other drugs to treat adults with acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. Idamycin PFS blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called 4-demethoxydaunorubicin and idarubicin hydrochloride.
    More Information
    - Idarubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/idarubicinhydrochloride)
  idarubicin hydrochloride: (I-duh-ROO-bih-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "idarubicin hydrochloride"
    A drug used with other drugs to treat adults with acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. Idarubicin hydrochloride blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. It is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called 4-demethoxydaunorubicin and Idamycin PFS.
    More Information
    - Idarubicin Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/idarubicinhydrochloride)
  IDC-P: A type of cancer that usually begins in the glandular (secretory) tissue that lines the prostate and spreads to the ducts within the prostate. IDC-P tends to be large when it is found and tends to grow and spread quickly to other parts of the body. It usually has a poor prognosis (chance of recovery) and is likely to come back after treatment. Also called intraductal carcinoma of the prostate and intraductal prostate carcinoma.
  IDEC-Y2B8: A drug used with the drug rituximab to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of B-cell tumors. IDEC-Y2B8 contains a monoclonal antibody that binds to a protein called CD20, which is found on B cells. It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. IDEC-Y2B8 is a type of radioimmunoconjugate. Also called 90Y-ibritumomab tiuxetan, 90Y-Zevalin, and yttrium Y 90-ibritumomab tiuxetan.
  idecabtagene vicleucel: (I-deh-KAB-tuh-jeen vik-LOO-sel)
    Pronunciation of dictionary term "idecabtagene vicleucel"
    A treatment used for adults with multiple myeloma that came back or did not get better after treatment with at least two lines of anticancer therapy that included an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Idecabtagene vicleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Idecabtagene vicleucel binds to a protein called BCMA, which is found on myeloma cells and some types of immune cells. This helps the body’s immune system kill cancer cells. Idecabtagene vicleucel is a type of cellular immunotherapy called CAR T-cell therapy. Also called Abecma.
    More Information
    - Idecabtagene Vicleucel (https://www.cancer.gov/about-cancer/treatment/drugs/Idecabtagenevicleucel)
  idelalisib: (i-deh-luh-LIH-sib)
    Pronunciation of dictionary term "idelalisib"
    A drug used with rituximab to treat chronic lymphocytic leukemia that has come back. It is also being studied in the treatment of other types of cancer. Idelalisib blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called Zydelig.
    More Information
    - Idelalisib (https://www.cancer.gov/about-cancer/treatment/drugs/idelalisib)
  IDH1 gene: (… jeen)
    Pronunciation of dictionary term "IDH1 gene"
    A gene that makes a protein that helps break down fats for energy and protect cells from harmful molecules. Mutations (changes) in the IDH1 gene have been found in several genetic conditions and in some types of cancer, including acute myelogenous leukemia, myelodysplastic syndromes, and brain cancer. These changes may cause abnormal cells, including cancer cells, to grow and spread in the body. Also called isocitrate dehydrogenase-1 gene.
  IDH2 gene: (… jeen)
    Pronunciation of dictionary term "IDH2 gene"
    A gene that makes a protein that is found inside small structures in cells called mitochondria and that helps the mitochondria make energy for many cell functions. Mutations (changes) in the IDH2 gene have been found in certain genetic conditions and in some types of cancer, including acute myelogenous leukemia and brain cancer. These changes may cause abnormal cells, including cancer cells, to grow and spread in the body. Also called isocitrate dehydrogenase-2 gene.
  Idhifa: (ide-HEE-fuh)
    Pronunciation of dictionary term "Idhifa"
    A drug used to treat adults with acute myeloid leukemia that has come back or has not gotten better with other treatment. It is used in patients whose cancer has a mutation (change) in the IDH2 gene. It is also being studied in the treatment of other types of cancer. Idhifa blocks the protein made by the mutated IDH2 gene. Blocking this protein may help keep cancer cells from growing. Idhifa is a type of enzyme inhibitor. Also called enasidenib mesylate.
    More Information
    - Enasidenib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/enasidenibmesylate)
  idiopathic: (IH-dee-oh-PA-thik)
    Pronunciation of dictionary term "idiopathic"
    Describes a disease of unknown cause.
  idiopathic myelofibrosis: (IH-dee-oh-PA-thik MY-eh-loh-fy-BROH-sis)
    Pronunciation of dictionary term "idiopathic myelofibrosis"
    A progressive, chronic disease in which the bone marrow is replaced by fibrous tissue and blood is made in organs such as the liver and the spleen, instead of in the bone marrow. This disease is marked by an enlarged spleen and progressive anemia. Also called agnogenic myeloid metaplasia, chronic idiopathic myelofibrosis, myelosclerosis with myeloid metaplasia, and primary myelofibrosis.
  idiopathic pneumonia syndrome: (IH-dee-oh-PA-thik noo-MOH-nyuh SIN-drome)
    Pronunciation of dictionary term "idiopathic pneumonia syndrome"
    A set of pneumonia-like symptoms (such as fever, chills, coughing, and breathing problems) that occur with no sign of infection in the lung. Idiopathic pneumonia syndrome is a serious condition that can occur after a stem cell transplant.
  idiopathic pulmonary fibrosis: (IH-dee-oh-PA-thik PUL-muh-NAYR-ee fy-BROH-sis)
    Pronunciation of dictionary term "idiopathic pulmonary fibrosis"
    A disease in which the alveoli (tiny air sacs at the end of the bronchioles in the lungs) are overgrown with fibrous tissue. The cause of the disease is unknown and it gets worse over time. Symptoms include difficult, painful breathing and shortness of breath.
  idiopathic thrombocytopenic purpura: (IH-dee-oh-PA-thik THROM-boh-sy-toh-PEE-nik PUR-pyoo-ruh)
    Pronunciation of dictionary term "idiopathic thrombocytopenic purpura"
    A condition in which platelets (blood cells that cause blood clots to form) are destroyed by the immune system. The low platelet count causes easy bruising and bleeding, which may be seen as purple areas in the skin, mucous membranes, and outer linings of organs. Also called immune thrombocytopenia, immune thrombocytopenic purpura, and ITP.
  idoxifene: (i-DOK-sih-feen)
    Pronunciation of dictionary term "idoxifene"
    A drug that blocks the effects of estrogen.
  idoxuridine: (I-dox-YOOR-ih-deen)
    Pronunciation of dictionary term "idoxuridine"
    A drug that reduces the risk of cancer cell growth by interfering with the cells' DNA.
  IDRF: A term used in the staging of neuroblastoma. It describes certain features of the tumor found on an imaging test, such as an MRI or CT scan, that affect how much of the tumor can be removed by surgery. For example, a tumor that surrounds major blood vessels, such as the aorta or vena cava, or involves two areas of the body, such as the neck and chest, is considered an IDRF. The presence of IDRFs means that it may be more difficult to remove the tumor safely and is a factor in how the stage of disease is determined. Also called image-defined risk factor.
  IEN: A term used to describe the presence of abnormal cells on the surface of or in the tissue that lines an organ, such as the cervix, breast, prostate, anus, vagina, vulva, penis, and mouth. The changes in the cells may be low grade or high grade, depending on how abnormal the cells look under a microscope and how much of the tissue is affected. Sometimes, the abnormal cells may become cancer and spread to nearby normal tissue. Also called intraepithelial neoplasia.
  IEP: An education plan for children with certain disabilities or health conditions, such as cancer. By law, these children must receive special education services and other support they need in school. An IEP describes which special services the child needs and how those needs will be met. This may include special class placement, extra help with class assignments and tests, tutoring, and other services such as counseling, speech therapy, and physical therapy. IEPs are covered in the U.S. law, Individuals with Disabilities Education Act. Also called individualized education plan.
  IFA: A mixture of oil and water that is combined with a specific antigen to boost the immune response to that antigen. It is being studied in immunotherapy and as a way to increase the immune response to cancer vaccines. It is a type of immune modulator. Also called incomplete Freund's adjuvant and Montanide ISA-51.
  Ifex: (I-fex)
    Pronunciation of dictionary term "Ifex"
    A drug used with other drugs to treat malignant testicular germ cell tumors that have already been treated with two other types of anticancer drugs. It is also being studied in the treatment of other types of cancer. Ifex damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent and a type of antimetabolite. Also called ifosfamide.
    More Information
    - Ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
  IFN alpha-2B: (… AL-fuh …)
    Pronunciation of dictionary term "IFN alpha-2B"
    A drug used alone or with other drugs to treat adults with AIDS-related Kaposi sarcoma, hairy cell leukemia, certain types of follicular lymphoma or melanoma, genital warts or perianal warts, or chronic hepatitis B or C. It is also being studied in the treatment of other types of cancer and other conditions. IFN alpha-2B is a form of interferon alfa (a substance normally made by cells in the immune system) that is made in the laboratory. It is a type of cytokine and a type of immunomodulating agent. Also called interferon alfa-2b, Intron A, and recombinant interferon alfa-2b.
    More Information
    - Recombinant Interferon Alfa-2b (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-interferon-alfa-2b)
  iFOBT: A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card for testing. The test uses an antibody that binds to a blood protein called hemoglobin to detect any blood. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called fecal immunochemical test, FIT, immunoassay fecal occult blood test, immunochemical fecal occult blood test, and immunologic fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
  ifosfamide: (i-FOS-fuh-mide)
    Pronunciation of dictionary term "ifosfamide"
    A drug used with other drugs to treat malignant testicular germ cell tumors that have already been treated with two other types of anticancer drugs. It is also being studied in the treatment of other types of cancer. Ifosfamide damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent and a type of antimetabolite. Also called Ifex.
    More Information
    - Ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
  Ig: (I-jee)
    Pronunciation of dictionary term "Ig"
    A protein that is made by B cells and plasma cells (types of white blood cells) and helps the body fight infection. Some Igs may be found in higher than normal amounts in patients with certain conditions or certain types of cancer, including multiple myeloma and Waldenstrom macroglobulinemia. Measuring the amount of specific Igs in the blood and urine may help diagnose cancer or find out how well treatment is working or if cancer has come back. Some Igs may be used as tumor markers. Also called immunoglobulin.
  IGF: A protein made by the body that stimulates the growth of many types of cells. IGF is similar to insulin (a hormone made in the pancreas). There are two forms of IGF called IGF-1 and IGF-2. Higher than normal levels of IGF-1 may increase the risk of several types of cancer. IGF is a type of growth factor and a type of cytokine. Also called insulin-like growth factor and somatomedin.
  IGF-1R inhibitor OSI-906: (… in-HIH-bih-ter ...)
    Pronunciation of dictionary term "IGF-1R inhibitor OSI-906"
    A substance being studied in the treatment of cancer. It blocks a protein called IGF-1R, which is found at high levels in some types of tumors. IGF-1R is needed for cell growth and blocking it may cause tumor cells to die. IGF-1R inhibitor OSI-906 is a type of IGF-1R inhibitor. Also called OSI-906.
  IGFR: A protein found on the surface of some types of cells that binds to insulin-like growth factor (IGF). This causes the cells to grow and divide. IGFR is found at high levels on the surface of several types of cancer cells, which causes these cells to grow rapidly in the presence of IGF. Also called insulin-like growth factor receptor.
  IgG-RFT5-dgA: A monoclonal antibody linked to a toxic substance. It is being studied in the treatment of melanoma that has spread to distant parts of the body. IgG-RFT5-dgA is made in the laboratory. It can find and kill certain white blood cells that prevent the immune system from killing cancer cells. Also called RFT5-dgA immunotoxin.
  IGRT: A procedure that uses a computer to create a picture of a tumor to help guide the radiation beam during radiation therapy. The pictures are made using CT, ultrasound, X-ray, or other imaging techniques. IGRT makes radiation therapy more accurate and causes less damage to healthy tissue. Also called image-guided radiation therapy.
  IH636 grape seed extract: (… grayp seed EK-strakt)
    Pronunciation of dictionary term "IH636 grape seed extract"
    A substance being studied for its ability to prevent damage to normal tissue caused by radiation therapy. It is a type of antioxidant.
  IL: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. ILs regulate immune responses. ILs made in the laboratory are used as biological response modifiers to boost the immune system in cancer therapy. An interleukin is a type of cytokine. Also called interleukin.
  IL-1: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-1 is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. There are two forms of IL-1, alpha and beta, which act the same. IL-1 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-1 is a type of cytokine. Also called interleukin-1.
  IL-1-alfa: (... AL-fuh)
    Pronunciation of dictionary term "IL-1-alfa"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-1-alfa, one form of IL-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of IL-1, IL-1-beta, acts the same as IL-1-alfa. IL-1-alfa made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-1-alfa is a type of cytokine. Also called IL-1-alpha, interleukin-1-alfa, and interleukin-1-alpha.
  IL-1-alpha: (... AL-fuh)
    Pronunciation of dictionary term "IL-1-alpha"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-1-alpha, one form of IL-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of IL-1, IL-1-beta, acts the same as IL-1-alpha. IL-1-alpha made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-1-alpha is a type of cytokine. Also called IL-1-alfa, interleukin-1-alfa, and interleukin-1-alpha.
  IL-1-beta: (... BAY-tuh)
    Pronunciation of dictionary term "IL-1-beta"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-1-beta, one form of IL-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of IL-1, IL-1-alpha, acts the same as IL-1-beta. IL-1-beta made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-1-beta is a type of cytokine. Also called IL-1B and interleukin-1-beta.
  IL-10: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-10 is made by activated macrophages and by some T lymphocytes. It reduces inflammation by blocking production of cytokines by immune cells. IL-10 also increases antibody production by plasma cells and helps them live longer. IL-10 made in the laboratory is used as a biological response modifier to boost the immune system. It is a type of cytokine. Also called interleukin-10.
  IL-11: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-11 is made by support cells in the bone marrow. It causes the growth of several types of blood cells. Oprelvekin (IL-11 made in the laboratory) is used as a biological response modifier to increase the number of platelets, especially in patients receiving chemotherapy for cancer. IL-11 is a type of cytokine. Also called interleukin-11.
  IL-12: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-12 is made mainly by B lymphocytes and macrophages. It causes other immune cells to make cytokines and increases the growth of T lymphocytes. It may also block the growth of new blood vessels. IL-12 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-12 is a type of cytokine. Also called interleukin-12.
  IL-13: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-13 is made by a type of T lymphocyte. It reduces inflammation by blocking production of cytokines by macrophages. It also increases the number and activity of B lymphocytes. IL-13 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. It is a type of cytokine. Also called interleukin-13.
  IL-1B: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-1B, one form of IL-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of IL-1, IL-1-alpha, acts the same as IL-1B. IL-1B made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-1B is a type of cytokine. Also called IL-1-beta and interleukin-1-beta.
  IL-2: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-2 is made by a type of T lymphocyte. It increases the growth and activity of other T lymphocytes and B lymphocytes, and affects the development of the immune system. Aldesleukin (IL-2 made in the laboratory) is being used as a biological response modifier to boost the immune system in cancer therapy. IL-2 is a type of cytokine. Also called interleukin-2.
  IL-3: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-3 is made mainly by a type of T lymphocyte. It increases the number of blood cells made by the bone marrow. IL-3 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-3 is a type of cytokine. Also called interleukin-3.
  IL-4: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-4 is made by a type of T lymphocyte. It causes B lymphocytes to increase and to make antibodies and also increases the production of T lymphocytes. IL-4 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-4 is a type of cytokine. Also called interleukin-4.
  IL-5: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-5 is made mainly by some T lymphocytes. It causes B lymphocytes to make more antibodies and increases the number of eosinophils. IL-5 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. It is a type of cytokine. Also called interleukin-5.
  IL-6: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-6 is made mainly by some T lymphocytes. It causes B lymphocytes to make more antibodies and also causes fever by affecting areas of the brain that control body temperature. IL-6 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-6 is a type of cytokine. Also called interleukin-6.
  IL-7: One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. IL-7 is made by cells that cover and support organs, glands, and other structures in the body. It causes the growth of T lymphocytes and B lymphocytes. IL-7 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. IL-7 is a type of cytokine. Also called interleukin-7 and lymphopoietin-1.
  ileostomy: (IL-ee-OS-toh-mee)
    Pronunciation of dictionary term "ileostomy"
    An opening into the ileum, part of the small intestine, from the outside of the body. An ileostomy provides a new path for waste material to leave the body after part of the intestine has been removed.
  ileum: (IH-lee-um)
    Pronunciation of dictionary term "ileum"
    The last part of the small intestine. It connects to the cecum (first part of the large intestine). The ileum helps to further digest food coming from the stomach and other parts of the small intestine. It absorbs nutrients (vitamins, minerals, carbohydrates, fats, proteins) and water from food so they can be used by the body.
    The small intestine is a long tube-like organ that connects the stomach to the large intestine. The small intestine includes the duodenum, jejunum, and ileum.
    Drawing of the small intestine showing the duodenum, jejunum, and ileum. Also shown are the stomach, appendix, large intestine, and rectum.
  ileus: (IH-lee-us)
    Pronunciation of dictionary term "ileus"
    Blockage of the intestines
  iloprost: (I-loh-prost)
    Pronunciation of dictionary term "iloprost"
    A substance that is being studied in the prevention of lung cancer. It belongs to the family of drugs called prostaglandin analogs.
  ILX-295501: A substance that is being studied as an anticancer drug. It belongs to the family of drugs called diarylsulfonylureas.
  ILX23-7553: A substance that is being studied as an anticancer drug.
  IM: Within or into muscle. Also called intramuscular.
  IM-862: An anticancer drug that belongs to the family of drugs called angiogenesis inhibitors.
  image-defined risk factor: (IH-mij-deh-FIND … FAK-ter)
    Pronunciation of dictionary term "image-defined risk factor"
    A term used in the staging of neuroblastoma. It describes certain features of the tumor found on an imaging test, such as an MRI or CT scan, that affect how much of the tumor can be removed by surgery. For example, a tumor that surrounds major blood vessels, such as the aorta or vena cava, or involves two areas of the body, such as the neck and chest, is considered an image-defined risk factor. The presence of image-defined risk factors means that it may be more difficult to remove the tumor safely and is a factor in how the stage of disease is determined. Also called IDRF.
  image-guided radiation therapy: (IH-mij-GY-ded RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "image-guided radiation therapy"
    A procedure that uses a computer to create a picture of a tumor to help guide the radiation beam during radiation therapy. The pictures are made using CT, ultrasound, X-ray, or other imaging techniques. Image-guided radiation therapy makes radiation therapy more accurate and causes less damage to healthy tissue. Also called IGRT.
  imagery therapy: (IH-muh-jree THAYR-uh-pee)
    Pronunciation of dictionary term "imagery therapy"
    A technique in which a person visualizes positive images or scenarios in their mind. During imagery therapy, a person uses all their senses in their imagination to help relax the body and develop a sense of well-being. Imagery therapy may be used to help relieve stress, pain, anxiety, and depression and to help with symptoms related to disease, such as cancer. Also called guided imagery and guided visualization.
  imaging: (IH-muh-jing)
    Pronunciation of dictionary term "imaging"
    In medicine, a process that makes pictures of areas inside the body. Imaging uses methods such as x-rays (high-energy radiation), ultrasound (high-energy sound waves), and radio waves.
  imaging procedure: (IH-muh-jing proh-SEE-jer)
    Pronunciation of dictionary term "imaging procedure"
    A type of test that makes detailed pictures of areas inside the body. Imaging procedures use different forms of energy, such as x-rays (high-energy radiation), ultrasound (high-energy sound waves), radio waves, and radioactive substances. They may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Examples of imaging procedures are computed tomography (CT), mammography, ultrasonography, magnetic resonance imaging (MRI), and nuclear medicine tests. Also called imaging test.
  imaging test: (IH-muh-jing …)
    Pronunciation of dictionary term "imaging test"
    A type of test that makes detailed pictures of areas inside the body. Imaging tests use different forms of energy, such as x-rays (high-energy radiation), ultrasound (high-energy sound waves), radio waves, and radioactive substances. They may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Examples of imaging tests are computed tomography (CT), mammography, ultrasonography, magnetic resonance imaging (MRI), and nuclear medicine tests. Also called imaging procedure.
  imatinib mesylate: (ih-MA-tih-nib MEH-zih-layt)
    Pronunciation of dictionary term "imatinib mesylate"
    A drug used to treat certain types of leukemia and other blood cancers, gastrointestinal stromal tumors, skin tumors called dermatofibrosarcoma protuberans, and a certain type of a rare condition called systemic mastocytosis. It is also being studied in the treatment of other conditions and types of cancer. Imatinib mesylate blocks certain proteins made by the BCR::ABL1, PDGFR, or c-KIT oncogene, which may help keep cancer cells from growing and may kill them. Imatinib mesylate is a type of tyrosine kinase inhibitor. Also called Gleevec, Imkeldi, and STI571.
    More Information
    - Imatinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/imatinibmesylate)
  Imbruvica: (im-BROO-vih-kuh)
    Pronunciation of dictionary term "Imbruvica"
    A drug used alone or with other drugs to treat adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, or Waldenstrom macroglobulinemia (a type of non-Hodgkin lymphoma). It is also used to treat adults and children aged 1 year and older with chronic graft versus host disease. It is also being studied in the treatment of other types of cancer. Imbruvica blocks a protein called BTK, which may help keep cancer cells from growing. It may also lower the body’s immune response. Imbruvica is a type of tyrosine kinase inhibitor. Also called ibrutinib.
    More Information
    - Ibrutinib (https://www.cancer.gov/about-cancer/treatment/drugs/ibrutinib)
  IMC-1121B: A drug that binds to the protein vascular endothelial growth factor (VEGF) to help keep new blood vessels from forming and is used to treat different types of cancer. It is used alone or with other drugs to treat certain types of non-small cell lung cancer, hepatocellular carcinoma (a type of liver cancer), colorectal cancer, stomach cancer, and gastroesophageal junction cancer. It is also being studied in the treatment of other types of cancer. IMC-1121B may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody. Also called anti-VEGFR-2 fully human monoclonal antibody IMC-1121B, Cyramza, and ramucirumab.
    More Information
    - Ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
  IMC-3G3: A drug used with doxorubicin to treat soft tissue sarcoma that cannot be treated with radiation therapy or surgery. It is used in patients whose cancer has not already been treated with an anthracycline (a type of anticancer drug). It is also being studied in the treatment of other types of cancer. IMC-3G3 binds to a receptor for a protein called platelet-derived growth factor (PDGF), which is found on some types of cancer cells. Blocking this protein receptor may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. IMC-3G3 is a type of monoclonal antibody. Also called anti-PDGFR alpha monoclonal antibody IMC-3G3, anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3, Lartruvo, and olaratumab.
    More Information
    - Olaratumab (https://www.cancer.gov/about-cancer/treatment/drugs/olaratumab)
  IMC-A12: A substance being studied in the treatment of some types of cancer. It is a monoclonal antibody that is made in the laboratory and can bind to substances in the body. IMC-A12 blocks the action of a protein needed for cell growth and may kill cancer cells. It is a type of insulin-like growth factor-1 receptor (IGF-1R) inhibitor. Also called cixutumumab.
  Imdelltra: (im-DEL-trah)
    Pronunciation of dictionary term "Imdelltra"
    A drug used to treat adults with extensive-stage small cell lung cancer that got worse during or after treatment with platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Imdelltra binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called DLL3, which is found on some types of cancer cells. This may help the immune system kill cancer cells. Imdelltra is a type of bispecific T-cell engager. Also called tarlatamab.
    More Information
    - Tarlatamab-dlle (https://www.cancer.gov/about-cancer/treatment/drugs/tarlatamab-dlle)
  imetelstat sodium: (ih-MEH-tel-stat SOH-dee-um)
    Pronunciation of dictionary term "imetelstat sodium"
    A drug used to treat low-risk or intermediate-1 risk myelodysplastic syndromes in adults with anemia. It is used in patients who need regular red blood cell transfusions and did not respond to or cannot be treated with an erythropoiesis-stimulating agent. It is also being studied in the treatment of other types of cancer. Imetelstat sodium binds to an enzyme called telomerase, which is found at high levels in certain types of cells, including cancer cells. Blocking the activity of this enzyme may help keep cancer cells from growing and dividing and cause them to die. Imetelstat sodium is a type of enzyme inhibitor. Also called Rytelo.
    More Information
    - Imetelstat Sodium (https://www.cancer.gov/about-cancer/treatment/drugs/imetelstat-sodium)
  imexon: (i-MEK-son)
    Pronunciation of dictionary term "imexon"
    A substance that is being studied in the treatment of some types of cancer, including pancreatic, lung, breast, prostate, melanoma, and multiple myeloma. It belongs to the family of drugs called cyanoaziridine derivatives. Also called Amplimexon.
  Imfinzi: (im-FIN-zee)
    Pronunciation of dictionary term "Imfinzi"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Imfinzi is used alone or with other drugs to treat adults with certain types of biliary tract cancer (including bile duct cancer and gallbladder cancer), bladder cancer, endometrial cancer, hepatocellular carcinoma (a type of liver cancer), non-small cell lung cancer, and small cell lung cancer. It is also being studied in the treatment of other types of cancer. Imfinzi may block PD-L1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called durvalumab.
    More Information
    - Durvalumab (https://www.cancer.gov/about-cancer/treatment/drugs/durvalumab)
  imipenem: (IH-mih-PEH-nem)
    Pronunciation of dictionary term "imipenem"
    An antibiotic drug used to treat severe or very resistant infection. It belongs to the family of drugs called carbapenems.
  imiquimod: (IH-mih-KWIH-mod)
    Pronunciation of dictionary term "imiquimod"
    A drug used to treat certain skin conditions. Imiquimod is used under the brand names Aldara and Zyclara to treat actinic keratosis (a skin condition that may become cancer) in adults who have a normal immune system and to treat genital warts or perianal warts in adults and in children aged 12 years or older. The Aldara brand of imiquimod is also used to treat superficial basal cell skin cancer in adults who have a normal immune system. Imiquimod is also being studied in the treatment of other conditions and types of cancer. It may help the immune system kill abnormal cells, including cancer cells. Imiquimod is a type of immunomodulating agent.
    More Information
    - Imiquimod (https://www.cancer.gov/about-cancer/treatment/drugs/imiquimod)
  Imjudo: (im-JOO-doh)
    Pronunciation of dictionary term "Imjudo"
    A drug that binds to the protein CTLA-4 to help immune cells kill cancer cells better and is used to treat different types of cancer. Imjudo is used with durvalumab to treat adults with hepatocellular carcinoma (a type of liver cancer) that cannot be removed by surgery. It is also used with durvalumab and platinum chemotherapy to treat adults with non-small cell lung cancer that has spread to other parts of the body and does not have an abnormal EGFR or ALK gene. It is also being studied in the treatment of other types of cancer. Imjudo may block CTLA-4 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called tremelimumab.
    More Information
    - Tremelimumab-actl (https://www.cancer.gov/about-cancer/treatment/drugs/tremelimumab-actl)
  Imkeldi: (im-KEL-dee)
    Pronunciation of dictionary term "Imkeldi"
    A drug used to treat certain types of leukemia and other blood cancers, gastrointestinal stromal tumors, skin tumors called dermatofibrosarcoma protuberans, and a certain type of a rare condition called systemic mastocytosis. It is also being studied in the treatment of other conditions and types of cancer. Imkeldi blocks certain proteins made by the BCR::ABL1, PDGFR, or c-KIT oncogene, which may help keep cancer cells from growing and may kill them. Imkeldi is a type of tyrosine kinase inhibitor. Also called Gleevec, imatinib mesylate, and STI571.
    More Information
    - Imatinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/imatinibmesylate)
  Imlygic: (im-LY-jik)
    Pronunciation of dictionary term "Imlygic"
    A drug used to treat melanoma that has recurred (come back) after surgery. It is used in patients whose cancer is in the skin and lymph nodes and cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Imlygic is made with a form of the herpesvirus that has been changed in the laboratory to infect and break down cancer cells without harming normal cells. It may also help the immune system kill cancer cells. Imlygic is injected directly into tumors in the skin and lymph nodes. It is a type of oncolytic virus therapy. Also called T-VEC and talimogene laherparepvec.
    More Information
    - Talimogene Laherparepvec (https://www.cancer.gov/about-cancer/treatment/drugs/talimogenelaherparepvec)
  immature teratoma: (IH-muh-CHOOR TAYR-uh-TOH-muh)
    Pronunciation of dictionary term "immature teratoma"
    A type of germ cell tumor that is often made up of several different types of tissue, such as hair, muscle, and bone. Immature teratomas have cells that look very different from normal cells under a microscope. They are usually malignant (cancer) and may spread to other parts of the body. Some immature teratomas make enzymes or hormones that may cause signs and symptoms of disease. Immature teratomas usually occur in the sacrum or tailbone in newborns or in the ovaries of girls at the start of puberty.
  IMMU-106: A substance being studied in the treatment of several types of lymphoma. It binds to the protein CD20, which is found on B cells (a type of immune system cell) and some types of lymphoma cells. This causes the immune system to kill the cancer cells. IMMU-106 is a type of monoclonal antibody. Also called hA20, HCD20, and veltuzumab.
  IMMU-110: A substance being studied in the treatment of multiple myeloma and several other types of cancer. It binds to CD74, a protein on the surface of myeloma cells and certain other types of cells. It may help kill cancer cells. IMMU-110 is a type of monoclonal antibody. Also called hLL1 and milatuzumab.
  immune adjuvant: (ih-MYOON A-juh-vunt)
    Pronunciation of dictionary term "immune adjuvant"
    A drug that stimulates the immune system to respond to disease.
  immune cell: (ih-MYOON sel)
    Pronunciation of dictionary term "immune cell"
    A cell that is part of the immune system and helps the body fight infections and other diseases. Immune cells develop from stem cells in the bone marrow and become different types of white blood cells. These include neutrophils, eosinophils, basophils, mast cells, monocytes, macrophages, dendritic cells, natural killer cells, and lymphocytes (B cells and T cells).
  immune checkpoint inhibitor: (ih-MYOON CHEK-poynt in-HIH-bih-ter)
    Pronunciation of dictionary term "immune checkpoint inhibitor"
    A type of drug that blocks proteins called checkpoints that are made by some types of immune system cells, such as T cells, and some cancer cells. These checkpoints help keep immune responses from being too strong and sometimes can keep T cells from killing cancer cells. When these checkpoints are blocked, T cells can kill cancer cells better. Examples of checkpoint proteins found on T cells or cancer cells include PD-1/PD-L1 and CTLA-4/B7-1/B7-2. Some immune checkpoint inhibitors are used to treat cancer.
    More Information
    - Immune Checkpoint Inhibitors (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/checkpoint-inhibitors)
    Immune checkpoint inhibitor. Checkpoint proteins, such as PD-L1 on tumor cells and PD-1 on T cells, help keep immune responses in check. The binding of PD-L1 to PD-1 keeps T cells from killing tumor cells in the body (left panel). Blocking the binding of PD-L1 to PD-1 with an immune checkpoint inhibitor (anti-PD-L1 or anti-PD-1) allows the T cells to kill tumor cells (right panel).
    Immune checkpoint inhibitor; the panel on the left shows the binding of proteins PD-L1 (on the tumor cell) to PD-1 (on the T cell), which keeps T cells from killing tumor cells in the body. Also shown are a tumor cell antigen and T cell receptor. The panel on the right shows immune checkpoint inhibitors (anti-PD-L1 and anti-PD-1) blocking the binding of PD-L1 to PD-1, which allows the T cells to kill tumor cells.
    Immune checkpoint inhibitor. Checkpoint proteins, such as B7-1/B7-2 on antigen-presenting cells (APC) and CTLA-4 on T cells, help keep the body’s immune responses in check. When the T-cell receptor (TCR) binds to antigen and major histocompatibility complex (MHC) proteins on the APC and CD28 binds to B7-1/B7-2 on the APC, the T cell can be activated. However, the binding of B7-1/B7-2 to CTLA-4 keeps the T cells in the inactive state so they are not able to kill tumor cells in the body (left panel). Blocking the binding of B7-1/B7-2 to CTLA-4 with an immune checkpoint inhibitor (anti-CTLA-4 antibody) allows the T cells to be active and to kill tumor cells (right panel).
    Immune checkpoint inhibitor; the panel on the left shows the binding of the T-cell receptor (TCR) to antigen and MHC proteins on the antigen-presenting cell (APC) and the binding of CD28 on the T cell to B7-1/B7-2 on the APC. It also shows the binding of B7-1/B7-2 to CTLA-4 on the T cell, which keeps the T cells in the inactive state. The panel on the right shows immune checkpoint inhibitor (anti-CTLA antibody) blocking the binding of B7-1/B7-2 to CTLA-4, which allows the T cells to be active and to kill tumor cells.
    Immune Checkpoint Inhibitors
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy that uses immune checkpoint inhibitors to treat cancer.
    YouTube (https://www.youtube.com/watch?v=GIUu239FWMg)
  immune checkpoint protein: (ih-MYOON CHEK-poynt PROH-teen)
    Pronunciation of dictionary term "immune checkpoint protein"
    A type of protein found on some immune cells, such as T cells and antigen-presenting cells, and some cancer cells. These proteins help keep the body’s immune response from being so strong that it harms healthy cells. Some immune checkpoint proteins on T cells bind with partner immune checkpoint proteins on cancer cells, which signals the T cells to stay in an inactive state, preventing them from killing the cancer cells. Drugs that block these proteins can help T cells find and kill cancer cells and are being used in the treatment of some types of cancer. Examples of immune checkpoint proteins are PD-1 and CTLA-4 on T cells and PD-L1 on some cancer cells.
  immune complex hemolytic anemia: (ih-MYOON KOM-plex HEE-moh-LIH-tik uh-NEE-mee-uh)
    Pronunciation of dictionary term "immune complex hemolytic anemia"
    A condition in which the body’s immune system stops red blood cells from forming or causes them to clump together. Immune complex hemolytic anemia can occur in patients who have chronic lymphocytic leukemia (CLL). Also called autoimmune hemolytic anemia and immunohemolytic anemia.
  immune function: (ih-MYOON FUNK-shun)
    Pronunciation of dictionary term "immune function"
    Production and action of cells that fight disease or infection.
  immune response: (ih-MYOON reh-SPONTS)
    Pronunciation of dictionary term "immune response"
    The way the body defends itself against substances it sees as harmful or foreign. In an immune response, the immune system recognizes the antigens (usually proteins) on the surface of substances or microorganisms, such as bacteria or viruses, and attacks and destroys, or tries to destroy, them. Cancer cells also have antigens on their surface. Sometimes, the immune system sees these antigens as foreign and mounts an immune response against them. This helps the body fight cancer.
  immune system: (ih-MYOON SIS-tem)
    Pronunciation of dictionary term "immune system"
    A complex network of cells, tissues, organs, and the substances they make that helps the body fight infections and other diseases. The immune system includes white blood cells and organs and tissues of the lymph system, such as the thymus, spleen, tonsils, lymph nodes, lymph vessels, and bone marrow.
  immune system disorder: (ih-MYOON SIS-tem dis-OR-der)
    Pronunciation of dictionary term "immune system disorder"
    A condition that affects the immune system. The immune system is made up of cells, tissues, and organs that help the body fight infections and other diseases. There are many different types of immune system disorders, including immunodeficiency disease, autoimmune disorders, and allergic disorders. Immunodeficiency disease occurs when a part of the immune system is missing or not working properly. Autoimmune disorders occur when the immune system recognizes its own tissues as foreign and attacks them. Allergic disorders occur when the immune system overreacts to substances that are usually not harmful, such as pollen, molds, and certain foods. Cancers of the immune system (such as leukemia and lymphoma) are also immune system disorders.
  immune system modulator: (ih-MYOON SIS-tem MAH-juh-lay-ter)
    Pronunciation of dictionary term "immune system modulator"
    A substance that stimulates or suppresses the immune system and may help the body fight cancer, infection, or other diseases. Specific immune system modulators, such as monoclonal antibodies, cytokines, and vaccines, affect specific parts of the immune system. Nonspecific immune system modulators, such as BCG and levamisole, affect the immune system in a general way. Also called immunomodulating agent.
    More Information
    - Immune System Modulators (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/immune-system-modulators)
  immune system tolerance: (ih-MYOON SIS-tem TAH-leh-runts)
    Pronunciation of dictionary term "immune system tolerance"
    The failure of the immune system to respond to an antigen that previously caused an immune response.
  immune thrombocytopenia: (ih-MYOON THROM-boh-sy-toh-PEE-nee-uh)
    Pronunciation of dictionary term "immune thrombocytopenia"
    A condition in which platelets (blood cells that cause blood clots to form) are destroyed by the immune system. The low platelet count causes easy bruising and bleeding, which may be seen as purple areas in the skin, mucous membranes, and outer linings of organs. Also called idiopathic thrombocytopenic purpura, immune thrombocytopenic purpura, and ITP.
  immune thrombocytopenic purpura: (ih-MYOON THROM-boh-sy-toh-PEE-nik PUR-pyoo-ruh)
    Pronunciation of dictionary term "immune thrombocytopenic purpura"
    A condition in which platelets (blood cells that cause blood clots to form) are destroyed by the immune system. The low platelet count causes easy bruising and bleeding, which may be seen as purple areas in the skin, mucous membranes, and outer linings of organs. Also called idiopathic thrombocytopenic purpura, immune thrombocytopenia, and ITP.
  immunity: (ih-MYOO-nih-tee)
    Pronunciation of dictionary term "immunity"
    In medicine, the immune system’s way of protecting the body against an infectious disease. The three types of immunity are innate, adaptive, and passive. Innate immunity includes barriers, such as skin and mucous membranes, that keep harmful substances from entering the body. It is the first response of the body’s immune system to a foreign substance. Adaptive immunity occurs in response to being infected with or vaccinated against a microorganism. The body makes an immune response, which can prevent future infection with the microorganism. Adaptive immunity can last a person’s entire life. Passive immunity occurs when a person receives antibodies to a disease rather than making them through his or her own immune system. Passive immunity provides immediate protection but only lasts a few weeks or months.
  immunization: (IH-myoo-nih-ZAY-shun)
    Pronunciation of dictionary term "immunization"
    A technique used to cause an immune response that results in resistance to a specific disease, especially an infectious disease.
  immunoassay: (IH-myoo-noh-A-say)
    Pronunciation of dictionary term "immunoassay"
    A test that uses the binding of antibodies to antigens to identify and measure certain substances. Immunoassays may be used to diagnose disease. Also, test results can provide information about a disease that may help in planning treatment (for example, when estrogen receptors are measured in breast cancer).
  immunoassay fecal occult blood test: (IH-myoo-noh-A-say FEE-kul uh-KULT ...)
    Pronunciation of dictionary term "immunoassay fecal occult blood test"
    A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card for testing. The test uses an antibody that binds to a blood protein called hemoglobin to detect any blood. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called fecal immunochemical test, FIT, iFOBT, immunochemical fecal occult blood test, and immunologic fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
  immunochemical fecal occult blood test: (IH-myoo-noh-KEH-mih-kul FEE-kul uh-KULT...)
    Pronunciation of dictionary term "immunochemical fecal occult blood test"
    A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card for testing. The test uses an antibody that binds to a blood protein called hemoglobin to detect any blood. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called fecal immunochemical test, FIT, iFOBT, immunoassay fecal occult blood test, and immunologic fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
  immunocompetence: (IH-myoo-noh-KOM-peh-tents)
    Pronunciation of dictionary term "immunocompetence"
    The ability to produce a normal immune response.
  immunocompetent: (IH-myoo-noh-KOM-peh-tent)
    Pronunciation of dictionary term "immunocompetent"
    Having the ability to produce a normal immune response.
  immunocompromised: (IH-myoo-noh-KOM-proh-mized)
    Pronunciation of dictionary term "immunocompromised"
    Having a weakened immune system. People who are immunocompromised have a reduced ability to fight infections and other diseases. This may be caused by certain diseases or conditions, such as AIDS, cancer, diabetes, malnutrition, and certain genetic disorders. It may also be caused by certain medicines or treatments, such as anticancer drugs, radiation therapy, and stem cell or organ transplant. Also called immunosuppressed.
  immunoconjugate: (IH-myoo-noh-KON-jih-gut)
    Pronunciation of dictionary term "immunoconjugate"
    An agent made up of an immune substance, such as a monoclonal antibody, that is chemically linked to a cell-killing substance such as a toxin, a radioactive molecule, or a drug. The antibody part of the immunoconjugate targets cancer cells and the linked substance may kill the cells or make them visible in the body. Some immunoconjugates are used to treat cancer or to help find cancer cells in the body.
  immunoconjugate therapy: (IH-myoo-noh-KON-jih-gut THAYR-uh-pee)
    Pronunciation of dictionary term "immunoconjugate therapy"
    A type of treatment that uses an immune substance, such as a monoclonal antibody, that is chemically linked to a cell-killing substance such as a toxin, radioisotope, or drug. The immune substance targets certain types of cells and the linked substance kills the targeted cells without harming other cells. Immunoconjugates are used in the treatment of cancer. Examples include antibody-drug conjugates, immunotoxins, and some targeted therapy drugs.
  immunocytochemistry: (IH-myoo-noh-SY-toh-KEH-mih-stree)
    Pronunciation of dictionary term "immunocytochemistry"
    A laboratory method that uses antibodies to check for certain antigens (markers) in a sample of cells. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to the antigen in the cell sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. Immunocytochemistry is used to help diagnose diseases, such as cancer. It may also be used to help tell the difference between different types of cancer.
  immunodeficiency: (IH-myoo-noh-deh-FIH-shun-see)
    Pronunciation of dictionary term "immunodeficiency"
    The decreased ability of the body to fight infections and other diseases.
  immunodeficiency syndrome: (IH-myoo-noh-deh-FIH-shun-see SIN-drome)
    Pronunciation of dictionary term "immunodeficiency syndrome"
    The inability of the body to produce an immune response.
  immunofluorescence: (IH-myoo-noh-floor-EH-sents)
    Pronunciation of dictionary term "immunofluorescence"
    A method used in the lab to detect certain antigens (markers) on a cell or in a tissue sample. Immunofluorescence uses antibodies that have a special dye attached to them to bind to the antigen in the sample. After binding, this dye allows cells or tissue that have the antigen to be seen under a microscope with a special light. Immunofluorescence may be used to help diagnose certain infections or diseases, such as cancer.
  immunogenicity: (IH-myoo-noh-jeh-NIH-sih-tee)
    Pronunciation of dictionary term "immunogenicity"
    The ability of a substance that contains antigens to cause the body to make an immune response against that substance. The immune system recognizes antigens on the surface of substances it sees as foreign, such as vaccines, bacteria, viruses, or cancer cells, and makes an immune response against them. The strength of an immune response depends on how immunogenic a substance is.
  immunoglobulin: (IH-myoo-noh-GLAH-byoo-lin)
    Pronunciation of dictionary term "immunoglobulin"
    A protein that is made by B cells and plasma cells (types of white blood cells) and helps the body fight infection. Some immunoglobulins may be found in higher than normal amounts in patients with certain conditions or certain types of cancer, including multiple myeloma and Waldenstrom macroglobulinemia. Measuring the amount of specific immunoglobulins in the blood and urine may help diagnose cancer or find out how well treatment is working or if cancer has come back. Some immunoglobulins may be used as tumor markers. Also called Ig.
  immunohemolytic anemia: (IH-myoo-noh-HEE-moh-LIH-tik uh-NEE-mee-uh)
    Pronunciation of dictionary term "immunohemolytic anemia"
    A condition in which the body’s immune system stops red blood cells from forming or causes them to clump together. Immunohemolytic anemia can occur in patients who have chronic lymphocytic leukemia (CLL). Also called autoimmune hemolytic anemia and immune complex hemolytic anemia.
  immunohistochemistry: (IH-myoo-noh-HIS-toh-KEH-mih-stree)
    Pronunciation of dictionary term "immunohistochemistry"
    A laboratory method that uses antibodies to check for certain antigens (markers) in a sample of tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to the antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. Immunohistochemistry is used to help diagnose diseases, such as cancer. It may also be used to help tell the difference between different types of cancer.
  immunologic fecal occult blood test: (IH-myoo-noh-LAH-jik FEE-kul uh-KULT...)
    Pronunciation of dictionary term "immunologic fecal occult blood test"
    A test that checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on a special card for testing. The test uses an antibody that binds to a blood protein called hemoglobin to detect any blood. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called fecal immunochemical test, FIT, iFOBT, immunoassay fecal occult blood test, and immunochemical fecal occult blood test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A fecal immunochemical test (FIT) checks for occult (hidden) blood in the stool. A small sample of stool is placed in a special collection tube or on special cards and returned to a doctor or laboratory for testing.
    Fecal immunochemical test (FIT); drawing shows a FIT kit, which includes the package insert, the collection paper, and a collection tube with a small brush inside of it. Also shown are the biohazard bag, the return envelope, and a paper with information about colorectal cancer and colorectal cancer screening.
  immunological adjuvant: (IH-myoo-noh-LAH-jih-kul A-juh-vunt)
    Pronunciation of dictionary term "immunological adjuvant"
    A substance used to help boost the immune response to a vaccine so that less vaccine is needed.
  immunology: (IH-myoo-NAH-loh-jee)
    Pronunciation of dictionary term "immunology"
    The study of the body's immune system.
  immunomodulating agent: (IH-myoo-noh-MOD-yoo-lay-ting AY-jent)
    Pronunciation of dictionary term "immunomodulating agent"
    A substance that stimulates or suppresses the immune system and may help the body fight cancer, infection, or other diseases. Specific immunomodulating agents, such as monoclonal antibodies, cytokines, and vaccines, affect specific parts of the immune system. Nonspecific immunomodulating agents, such as BCG and levamisole, affect the immune system in a general way. Also called immune system modulator.
    More Information
    - Immune System Modulators (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/immune-system-modulators)
  immunomodulation: (IH-myoo-noh-MAH-juh-LAY-shun)
    Pronunciation of dictionary term "immunomodulation"
    Change in the body's immune system, caused by agents that activate or suppress its function.
  immunophenotyping: (IH-myoo-noh-FEE-noh-ty-ping)
    Pronunciation of dictionary term "immunophenotyping"
    A process that uses antibodies to identify cells based on the types of antigens or markers on the surface of the cells. This process is used in basic research and to help diagnose diseases, such as specific types of leukemia and lymphoma. Immunophenotyping may also be used to separate cells into different groups based on the markers they have on the surface.
  immunoscintigraphy: (IH-myoo-noh-sin-TIH-gruh-fee)
    Pronunciation of dictionary term "immunoscintigraphy"
    An imaging procedure in which antibodies labeled with radioactive substances are given to the person. A picture is taken of sites in the body where the antibody localizes.
  immunosignature: (IH-myoo-noh-SIG-nuh-cher)
    Pronunciation of dictionary term "immunosignature"
    Information about the antibodies in a person’s blood at a given point in time. Over time, the antibodies can change and immunosignatures might be used to help track a person’s health and diagnose infections, cancer, or other medical conditions earlier.
  immunostimulant: (IH-myoo-noh-STIM-yoo-lunt)
    Pronunciation of dictionary term "immunostimulant"
    A substance that increases the ability of the immune system to fight infection and disease.
  immunosuppressed: (IH-myoo-noh-suh-PREST)
    Pronunciation of dictionary term "immunosuppressed"
    Having a weakened immune system. People who are immunosuppressed have a reduced ability to fight infections and other diseases. This may be caused by certain diseases or conditions, such as AIDS, cancer, diabetes, malnutrition, and certain genetic disorders. It may also be caused by certain medicines or treatments, such as anticancer drugs, radiation therapy, and stem cell or organ transplant. Also called immunocompromised.
  immunosuppression: (IH-myoo-noh-suh-PREH-shun)
    Pronunciation of dictionary term "immunosuppression"
    Suppression of the body's immune system and its ability to fight infections and other diseases. Immunosuppression may be deliberately induced with drugs, as in preparation for bone marrow or other organ transplantation, to prevent rejection of the donor tissue. It may also result from certain diseases such as AIDS or lymphoma or from anticancer drugs.
  immunosuppressive: (IH-myoo-noh-suh-PREH-siv)
    Pronunciation of dictionary term "immunosuppressive"
    Describes the ability to decrease the body's immune system responses.
  immunosuppressive agent: (IH-myoo-noh-suh-PREH-siv AY-jent)
    Pronunciation of dictionary term "immunosuppressive agent"
    An agent that decreases the body’s immune responses. It reduces the body’s ability to fight infections and other diseases, such as cancer. Immunosuppressive agents may be used to keep a person from rejecting a bone marrow or organ transplant. They are also used in the treatment of conditions marked by overactive immune responses, such as autoimmune diseases and allergies.
  immunosuppressive therapy: (IH-myoo-noh-suh-PREH-siv THAYR-uh-pee)
    Pronunciation of dictionary term "immunosuppressive therapy"
    Treatment that lowers the activity of the body’s immune system. This reduces its ability to fight infections and other diseases, such as cancer. Immunosuppressive therapy may be used to keep a person from rejecting a bone marrow or organ transplant. It may also be used to treat conditions in which the immune system is overactive, such as autoimmune diseases and allergies. Some types of immunosuppressive therapy may increase a person’s risk of cancer by lowering the body’s ability to kill cancer cells.
  immunotherapy: (IH-myoo-noh-THAYR-uh-pee)
    Pronunciation of dictionary term "immunotherapy"
    A type of therapy that uses substances to stimulate or suppress the immune system to help the body fight cancer, infection, and other diseases. Some types of immunotherapy only target certain cells of the immune system. Others affect the immune system in a general way. Types of immunotherapy include cytokines, vaccines, bacillus Calmette-Guerin (BCG), and some monoclonal antibodies.
    More Information
    - Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
    Immunotherapy: How the Immune System Fights Cancer
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains three types of immunotherapy used to treat cancer: nonspecific immune stimulation, T-cell transfer therapy, and immune checkpoint inhibitors.
    YouTube (https://www.youtube.com/watch?v=jDdL2bMQXfE)
  immunotoxin: (IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "immunotoxin"
    An immune substance, such as a monoclonal antibody, cytokine, or immunoglobulin, chemically linked to a toxic substance. The immune substance binds to specific proteins or receptors found on some cancer cells. This allows the linked toxic substance to enter the cancer cells and kill them without harming nearby healthy cells.
  Imodium: (ih-MOH-dee-um)
    Pronunciation of dictionary term "Imodium"
    A drug used to treat diarrhea. Imodium works by binding to mu opioid receptors in the intestines, which slows the movement of the muscles in the intestines. This gives the body more time to absorb water and electrolytes from the feces (waste matter), resulting in firmer and less frequent bowel movements. Imodium is a type of synthetic opioid agonist that works only in the gut when used as directed. Also called loperamide hydrochloride.
  impairment: (im-PAYR-ment)
    Pronunciation of dictionary term "impairment"
    A loss of part or all of a physical or mental ability, such as the ability to see, walk, or learn.
  implant: (IM-plant)
    Pronunciation of dictionary term "implant"
    A substance or object that is put in the body as a prosthesis, or for treatment or diagnosis.
  implant displacement views: (… dis-PLAYS-ment vyooz)
    Pronunciation of dictionary term "implant displacement views"
    A procedure used to do a mammogram (x-ray of the breasts) in women with breast implants. The implant is pushed back against the chest wall and the breast tissue is pulled forward and around it so the tissue can be seen in the mammogram. Also called Eklund displacement views and Eklund views.
  implant radiation therapy: (... RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "implant radiation therapy"
    A type of radiation therapy in which radioactive implants, such as pellets, seeds, ribbons, wires, needles, balloons, or capsules, are placed in the body, directly into or near the tumor. The radiation is delivered through a flexible tube called a catheter or a larger device called an applicator. Implant radiation therapy is often used to treat cancers of the head and neck, breast, cervix, prostate, and eye. Depending on the type of cancer and treatment plan, the implant may be kept in place for a few minutes, many days, or permanently. Also called brachytherapy and radiation brachytherapy.
  implantable cardioverter-defibrillator: (im-PLAN-tuh-bul KAR-dee-oh-VER-ter-dee-FIH-brih-LAY-ter)
    Pronunciation of dictionary term "implantable cardioverter-defibrillator"
    A small device used to correct a heartbeat that is abnormal (too fast, too slow, or irregular). The device is placed by surgery in the chest or abdomen. Wires are passed through a vein to connect the device to the heart. When it detects abnormal heartbeats, it sends an electrical shock to the heart to restore the heartbeat to normal. Also called ICD.
  implantable pump: (im-PLAN-tuh-bul …)
    Pronunciation of dictionary term "implantable pump"
    A small device installed under the skin to administer a steady dose of drugs.
  impotence: (IM-puh-tents)
    Pronunciation of dictionary term "impotence"
    In medicine, refers to the inability to have an erection of the penis adequate for sexual intercourse. Also called erectile dysfunction.
  impotent: (IM-poh-tent)
    Pronunciation of dictionary term "impotent"
    In medicine, describes the inability to have an erection of the penis adequate for sexual intercourse.
  IMRT: A type of 3-dimensional radiation therapy that uses computer-generated images to show the size and shape of the tumor. Thin beams of radiation of different intensities are aimed at the tumor from many angles. This type of radiation therapy reduces the damage to healthy tissue near the tumor. Also called intensity-modulated radiation therapy.
  in situ: (in SY-too)
    Pronunciation of dictionary term "in situ"
    In its original place. For example, in carcinoma in situ, abnormal cells are found only in the place where they first formed. They have not spread.
  in vitro: (in VEE-troh)
    Pronunciation of dictionary term "in vitro"
    In the laboratory (outside the body). The opposite of in vivo (in the body).
  in vitro fertilization: (in VEE-troh FER-tih-lih-ZAY-shun)
    Pronunciation of dictionary term "in vitro fertilization"
    A procedure in which eggs are removed from a woman’s ovary and combined with sperm outside the body to form embryos. The embryos are grown in the laboratory for several days and then either placed in a woman’s uterus or cryopreserved (frozen) for future use. Also called IVF.
  in vivo: (in VEE-voh)
    Pronunciation of dictionary term "in vivo"
    In the body. The opposite of in vitro (outside the body or in the laboratory).
  in-transit metastasis: (in-TRAN-zit meh-TAS-tuh-sis)
    Pronunciation of dictionary term "in-transit metastasis"
    A type of metastasis in which skin cancer spreads through a lymph vessel and begins to grow more than 2 centimeters away from the primary tumor but before it reaches the nearest lymph node.
  inalimarev: (IH-nuh-LIH-muh-rev)
    Pronunciation of dictionary term "inalimarev"
    A cancer vaccine made with a form of vaccinia virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins, including the tumor markers called CEA and MUC-1, that may help immune cells in the body kill tumor cells. Also called PANVAC-V and recombinant vaccinia-CEA-MUC-1-TRICOM vaccine.
  inavolisib: (IH-nuh-voh-LIH-sib)
    Pronunciation of dictionary term "inavolisib"
    A drug used with palbociclib and fulvestrant to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer that has a mutation (change) in the PIK3CA gene. It is also being studied in the treatment of other types of cancer. Inavolisib works by blocking the activity of a protein called PI3K-alpha that signals cancer cells to multiply. It also helps break down mutant versions of this protein found in some cancer cells. This may keep cancer cells from growing and may kill them. Inavolisib is a type of targeted therapy drug called an enzyme inhibitor. Also called Itovebi.
    More Information
    - Inavolisib (https://www.cancer.gov/about-cancer/treatment/drugs/inavolisib)
  incidence: (IN-sih-dents)
    Pronunciation of dictionary term "incidence"
    The number of new cases of a disease diagnosed each year.
  incision: (in-SIH-zhun)
    Pronunciation of dictionary term "incision"
    A cut made in the body to perform surgery.
  incisional biopsy: (in-SIH-zhuh-nul BY-op-see)
    Pronunciation of dictionary term "incisional biopsy"
    A surgical procedure in which a cut is made through the skin to remove a sample of abnormal tissue or part of a lump or suspicious area. The tissue is then checked under a microscope for signs of disease.
  inclusion: (in-KLOO-zhun)
    Pronunciation of dictionary term "inclusion"
    Being part of something. Can also refer to creating an environment that encourages a person or group to feel like they belong and are supported, respected, and valued. Inclusion brings people with different racial, ethnic, cultural, and social backgrounds and experiences together in a safe, positive, and caring environment.
  incomplete colonoscopy: (in-kum-PLEET KOH-luh-NOS-koh-pee)
    Pronunciation of dictionary term "incomplete colonoscopy"
    A colonoscopy that was attempted but could not be completed. A colonoscopy is an examination of the inside of the colon using a thin, lighted, tube-like instrument called a colonoscope to look for polyps, cancer, or other abnormal areas in the colon. An incomplete colonoscopy occurs when the health care provider is not able to advance the colonoscope through the entire colon to the cecum (a pouch that connects the colon to the small intestine). An incomplete colonoscopy is more likely to occur if the colon is not completely clear of stool or if a person has a low body weight, is a young female, or is having pain due to the test. Other factors that may lead to an incomplete colonoscopy include the presence of scar tissue, diverticulosis (small sacs or pouches in the walls of the colon), or a twisted, looped, or abnormally long colon.
    The colon includes the ascending colon, cecum, transverse colon, descending colon, sigmoid colon, and rectum.
    Parts of the colon; drawing shows the ascending colon, cecum, transverse colon, descending colon, sigmoid colon, and rectum.
  incomplete Freund's adjuvant: (in-kum-PLEET froyndz A-juh-vunt)
    Pronunciation of dictionary term "incomplete Freund's adjuvant"
    A mixture of oil and water that is combined with a specific antigen to boost the immune response to that antigen. It is being studied in immunotherapy and as a way to increase the immune response to cancer vaccines. It is a type of immune modulator. Also called IFA and Montanide ISA-51.
  incomplete penetrance: (in-kum-PLEET PEH-neh-trunts)
    Pronunciation of dictionary term "incomplete penetrance"
    A term that describes when some people with a disease-causing mutation (change) in a gene develop the disease while others don’t. For example, certain gene mutations cause cancer, but because of incomplete penetrance, not everyone who has the mutation will develop cancer. Currently, there is no way to know which people who have a cancer-causing gene mutation will develop cancer. Also called reduced penetrance.
  incontinence: (in-KON-tih-nents)
    Pronunciation of dictionary term "incontinence"
    Inability to control the flow of urine from the bladder (urinary incontinence) or the escape of stool from the rectum (fecal incontinence).
  incubated: (IN-kyoo-bay-ted)
    Pronunciation of dictionary term "incubated"
    Grown in the laboratory under controlled conditions. For example, white blood cells can be grown in special conditions so that they attack specific cancer cells when returned to the body.
  IND: A substance that has been tested in the laboratory and has been approved by the U.S. Food and Drug Administration (FDA) for testing in people. Clinical trials test how well INDs work and whether they are safe to use. An IND may be approved by the FDA for use in one disease or condition but still be considered investigational in other diseases or conditions. Also called experimental drug, investigational agent, investigational drug, and investigational new drug.
    More Information
    - Access to Experimental Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs/access-experimental)
  Inderal: (IN-deh-ral)
    Pronunciation of dictionary term "Inderal"
    A drug that contains the active ingredient propranolol hydrochloride and is used to treat high blood pressure, including before surgery in patients with pheochromocytoma, and many other conditions. It is also being studied in the treatment of other conditions and some types of cancer. Inderal blocks certain receptors on nerve cells and causes blood vessels to relax and widen. This improves blood flow and lowers blood pressure and heart rate. Inderal is a type of beta blocker.
    More Information
    - Propranolol Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/propranolol-hydrochloride)
  Indian cress: (IN-dee-un kres)
    Pronunciation of dictionary term "Indian cress"
    Parts of the flowering plant have been used in some cultures to treat certain medical problems. It may have anticancer effects. The scientific name is Nasturtium officinale. Also called watercress.
  Indian elm: (IN-dee-un elm)
    Pronunciation of dictionary term "Indian elm"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called gray elm, red elm, slippery elm, sweet elm, Ulmus fulva, and Ulmus rubra.
  Indian rhubarb: (IN-dee-un ROO-barb)
    Pronunciation of dictionary term "Indian rhubarb"
    The root of this plant has been used in some cultures to treat certain medical problems. It may have anti-inflammatory and anticancer effects. The scientific name is Rheum palmatum or Rheum officinale. Also called Chinese rhubarb, da-huang, rhubarb, and Turkish rhubarb.
  Indian saffron: (IN-dee-un SA-fron)
    Pronunciation of dictionary term "Indian saffron"
    An East Indian plant that is a member of the ginger family and is used as a spice and food color. It is a major ingredient found in curry powder. The underground stem of the Indian saffron plant has been used for many years in traditional Asian medicine to treat certain conditions. The substance in Indian saffron that gives it a yellow color is called curcumin, which may have antioxidant and anti-inflammatory effects in the body. Indian saffron can be made into a capsule, tablet, extract, powder, or tea and taken by mouth as a dietary supplement. It can also be made into a paste to treat skin conditions. Indian saffron is being studied in the prevention and treatment of some types of cancer. Its scientific name is Curcuma longa. Also called jiang huang and turmeric.
    More Information
    - Curcumin (Curcuma, Turmeric) and Cancer
  Indian valerian: (IN-dee-un vuh-LEER-ee-un)
    Pronunciation of dictionary term "Indian valerian"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, garden valerian, Mexican valerian, Pacific valerian, valerian, Valeriana officinalis, and Valerianae radix.
  indication: (IN-dih-KAY-shun)
    Pronunciation of dictionary term "indication"
    In medicine, a sign, symptom, or medical condition that leads to the recommendation of a treatment, test, or procedure.
  indinavir: (in-DIH-nuh-veer)
    Pronunciation of dictionary term "indinavir"
    A drug that interferes with the ability of a virus to make copies of itself.
  indirect ophthalmoscopy: (IN-duh-REKT OF-thul-MOS-koh-pee)
    Pronunciation of dictionary term "indirect ophthalmoscopy"
    An exam of the inside of the back of the eye using a beam of light and a hand-held lens. Indirect ophthalmoscopy gives a wider view inside the eye than an exam using an ophthalmoscope does.
  indium In 111-anti-CEA monoclonal antibody M5A: (IN-dee-um … MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "indium In 111 anti-CEA monoclonal antibody M5A"
    A substance being studied in the imaging of some types of cancer. M5A is a monoclonal antibody that binds to a protein called CEA on the surface of some tumor cells. It is linked to a radioisotope called indium In 111. The combined substance is injected into the blood, and a machine is used to find cells in the body that bind to it. Indium In 111-anti-CEA monoclonal antibody M5A is a type of radioimmunoconjugate.
  indium In 111-CHX-A DTPA trastuzumab: (IN-dee-um … tras-TOO-zoo-mab)
    Pronunciation of dictionary term "indium In 111 CHX-A DTPA trastuzumab"
    A substance being studied in the imaging of breast cancer and some other types of cancer. It is made by attaching a radioactive substance called indium In 111 to the monoclonal antibody trastuzumab. Trastuzumab binds to the human growth factor receptor 2 (HER2/neu) on some breast cancer cells and on several other types of cancer cells. Indium In 111-CHX-A DTPA trastuzumab is a type of radioimmunoconjugate.
  indium In 111-ibritumomab tiuxetan: (IN-dee-um … ih-brih-TOO-moh-mab ty-UK-seh-tan)
    Pronunciation of dictionary term "indium In 111 ibritumomab tiuxetan"
    A radiolabeled monoclonal antibody used to find certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the diagnosis of other types of B-cell tumors. Indium In 111-ibritumomab tiuxetan is made up of the monoclonal antibody ibritumomab plus the radioisotope indium In 111. It binds to a protein called CD20, which is found on B cells. A machine is used to find which cells in the body have taken up indium In 111-ibritumomab tiuxetan. Indium In 111-ibritumomab tiuxetan is a type of radioimmunoconjugate. Also called 111In-ibritumomab tiuxetan and 111In-Zevalin.
  indium In 111-pentetreotide: (IN-dee-um … PEN-teh-TREE-oh-tide)
    Pronunciation of dictionary term "indium In 111 pentetreotide"
    A radioactive drug used to find certain types of neuroendocrine tumors (tumors that form from cells that release hormones). Indium In 111-pentetreotide binds to a protein called somatostatin receptor, which is found on some neuroendocrine tumor cells. Indium In 111-pentetreotide builds up in these cells and gives off radiation that can be detected by a scanner to help show where the tumor cells are in the body.
  individualized education plan: (in-dih-VIH-joo-wuh-lized EH-juh-KAY-shun plan)
    Pronunciation of dictionary term "individualized education plan"
    An education plan for children with certain disabilities or health conditions, such as cancer. By law, these children must receive special education services and other support they need in school. An individualized education plan describes which special services the child needs and how those needs will be met. This may include special class placement, extra help with class assignments and tests, tutoring, and other services such as counseling, speech therapy, and physical therapy. Individualized education plans are covered in the U.S. law, Individuals with Disabilities Education Act. Also called IEP.
  indole: (IN-dole)
    Pronunciation of dictionary term "indole"
    A type of chemical found in plants and in certain vegetables, such as broccoli, cabbage, and cauliflower. Indoles may promote good health and are being studied in the prevention of certain types of cancer, including breast cancer, prostate cancer, and colon cancer. An indole is a type of phytochemical.
  indole-3-carbinol: (IN-dole … KAR-bih-nol)
    Pronunciation of dictionary term "indole-3-carbinol"
    A substance that is being studied as a cancer prevention drug. It is found in cruciferous vegetables.
  indolent: (IN-doh-lent)
    Pronunciation of dictionary term "indolent"
    A type of cancer that grows slowly.
  indolent lymphoma: (IN-doh-lent lim-FOH-muh)
    Pronunciation of dictionary term "indolent lymphoma"
    A type of lymphoma that tends to grow and spread slowly, and has few symptoms. Also called low-grade lymphoma.
  indomethacin: (IN-doh-MEH-thuh-sin)
    Pronunciation of dictionary term "indomethacin"
    A drug that reduces pain, fever, swelling, and redness. It is also being used to reduce tumor-induced suppression of the immune system and to increase the effectiveness of anticancer drugs. It is a type of nonsteroidal anti-inflammatory drug (NSAID).
  induction therapy: (in-DUK-shun THAYR-uh-pee)
    Pronunciation of dictionary term "induction therapy"
    The first treatment given for a disease. It is often part of a standard set of treatments, such as surgery followed by chemotherapy and radiation. When used by itself, induction therapy is the one accepted as the best treatment. If it doesn’t cure the disease or it causes severe side effects, other treatment may be added or used instead. Also called first-line therapy, primary therapy, and primary treatment.
  industrial hemp: (in-DUH-stree-ul hemp)
    Pronunciation of dictionary term "industrial hemp"
    An herb that comes from a variant of the Cannabis sativa plant and contains fiber, seeds, and oil used to make many different industrial and consumer products. These include textiles, building materials, paper, fabrics, soap, food, dietary supplements, and cosmetics. Industrial hemp and marijuana come from the same species of Cannabis sativa, but the industrial hemp variant contains very low levels of delta-9-THC (the main active chemical in marijuana that causes drug-like effects in the body). The industrial hemp and marijuana variants of Cannabis sativa have their own chemical and genetic makeup and are regulated, grown, and used in different ways. Also called hemp.
  infantile fibrosarcoma: (IN-fun-TILE FY-broh-sar-KOH-muh)
    Pronunciation of dictionary term "infantile fibrosarcoma"
    A type of cancer that forms in fibrous (connective) tissue. Infantile fibrosarcoma usually occurs in infants and young children but it may also be found before birth by ultrasound. It can occur anywhere in the body. The tumor is often large and fast-growing, but it rarely spreads to other parts of the body. The cancer cells usually have a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). Infantile fibrosarcoma is a type of soft tissue sarcoma. Also called congenital fibrosarcoma.
    More Information
    - Childhood Soft Tissue Sarcoma
  infantile genetic agranulocytosis: (IN-fun-TILE jeh-NEH-tik ay-GRAN-yoo-loh-sy-TOH-sis)
    Pronunciation of dictionary term "infantile genetic agranulocytosis"
    An inherited disorder in which there is a lower-than-normal number of neutrophils (a type of white blood cell that is important in fighting infections). Infants with the disorder get infections caused by bacteria, and are at an increased risk of acute myelogenous leukemia (AML) or myelodysplasia (a bone marrow disorder). Also called congenital neutropenia, genetic infantile agranulocytosis, Kostmann disease, Kostmann neutropenia, and Kostmann syndrome.
    More Information
    - Severe congenital neutropenia (MedlinePlus) (https://medlineplus.gov/genetics/condition/severe-congenital-neutropenia/)
    - Severe congenital neutropenia autosomal recessive 3 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/302/kostmann-disease)
  infantile hemangioma: (IN-fun-TILE hee-MAN-jee-OH-muh)
    Pronunciation of dictionary term "infantile hemangioma"
    A benign (not cancer) blood vessel tumor that forms on the skin, in the tissue below the skin, or in an organ. Infantile hemangiomas may be raised or flat and usually appear as bright red-blue lesions on the skin. They may sometimes be called a “strawberry mark”. They can occur anywhere on or in the body, but usually form on the skin of the head and neck. Infantile hemangiomas are not usually seen at birth but appear when the infant is 3 to 6 weeks old. They usually get bigger, then stop growing and slowly go away on their own. Infantile hemangiomas are the most common type of vascular tumor in children.
    More Information
    - Childhood Vascular Tumors
  infantile hemangiopericytoma: (IN-fun-TILE hee-MAN-jee-oh-PAYR-ih-sy-TOH-muh)
    Pronunciation of dictionary term "infantile hemangiopericytoma"
    A rare type of soft tissue tumor that begins in cells that wrap around blood vessels. Infantile hemangiopericytomas may be benign (not cancer) or malignant (cancer). They usually occur in infants and young children but may also be found before birth by ultrasound. They can occur anywhere in the body, but usually occur in the arms, legs, pelvis, or head and neck. In children older than 1 year, infantile hemangiopericytomas are more likely to spread to other parts of the body, including the lymph nodes and lungs. Children younger than 1 year may have a better prognosis.
    More Information
    - Childhood Soft Tissue Sarcoma
  infantile myofibromatosis: (IN-fun-TILE MY-oh-FY-broh-muh-TOH-sis)
    Pronunciation of dictionary term "infantile myofibromatosis"
    A rare condition in which one or more fibrous (connective tissue) tumors form in the skin, muscle, or bone. Sometimes, they also form in internal organs. The tumors are usually benign (not cancer) and do not spread to other parts of the body, but they can grow large and damage nearby organs. They may go away without treatment. Infantile myofibromatosis occurs most often in the first 2 years of life, or it may be present at birth. It is a type of soft tissue tumor.
    More Information
    - Infantile myofibromatosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2998/infantile-myofibromatosis)
    - Childhood Soft Tissue Sarcoma
  infantile rickets: (IN-fun-TILE RIH-kets)
    Pronunciation of dictionary term "infantile rickets"
    A condition in children in which bones become soft and deformed because they don’t have enough calcium and phosphorus. It is caused by not having enough vitamin D in the diet or by not getting enough sunlight. In adults, this condition is called osteomalacia. Also called juvenile rickets, rachitis, and rickets.
  infection: (in-FEK-shun)
    Pronunciation of dictionary term "infection"
    The invasion and growth of germs in the body. The germs may be bacteria, viruses, yeast, fungi, or other microorganisms. Infections can begin anywhere in the body and may spread all through it. An infection can cause fever and other health problems, depending on where it occurs in the body. When the body’s immune system is strong, it can often fight the germs and cure an infection. Some cancer treatments can weaken the immune system, which may lead to infection.
    More Information
    - Infection and Neutropenia during Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/infection)
  inferior vena cava: (in-FEER-ee-er VEE-nuh KAY-vuh)
    Pronunciation of dictionary term "inferior vena cava"
    A large vein that empties into the heart. It carries blood from the legs and feet and from organs in the abdomen and pelvis.
  infertile: (in-FER-til)
    Pronunciation of dictionary term "infertile"
    Unable to produce children.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  infertility: (IN-fer-TIH-lih-tee)
    Pronunciation of dictionary term "infertility"
    The inability to produce children.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  infigratinib phosphate: (IN-fig-RA-tih-nib FOS-fayt)
    Pronunciation of dictionary term "infigratinib phosphate"
    A drug used to treat adults with cholangiocarinoma (bile duct cancer) that is locally advanced and cannot be removed by surgery or has spread to other parts of the body. It is used in patients whose cancer has a FGFR2 gene fusion or other change in the structure of the FGFR2 gene and has already been treated. It is also being studied in the treatment of other types of cancer. Infigratinib phosphate blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Infigratinib phosphate is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Truseltiq.
    More Information
    - Infigratinib Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/infigratinibphosphate)
  infiltrating breast cancer: (IN-fil-TRAY-ting brest KAN-ser)
    Pronunciation of dictionary term "infiltrating breast cancer"
    Cancer that has spread from where it began in the breast to surrounding normal tissue. The most common type of infiltrating breast cancer is infiltrating ductal carcinoma, which begins in the lining of the milk ducts (thin tubes that carry milk from the lobules of the breast to the nipple). Another type is infiltrating lobular carcinoma, which begins in the lobules (milk glands) of the breast. Infiltrating breast cancer can spread through the blood and lymph systems to other parts of the body. Also called invasive breast cancer.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
  infiltrating cancer: (IN-fil-TRAY-ting KAN-ser)
    Pronunciation of dictionary term "infiltrating cancer"
    Cancer that has spread beyond the layer of tissue in which it developed and is growing into surrounding, healthy tissues. Also called invasive cancer.
  infiltrating ductal carcinoma: (IN-fil-TRAY-ting DUK-tul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "infiltrating ductal carcinoma"
    The most common type of infiltrating breast cancer. It begins in the lining of the milk ducts (thin tubes that carry milk from the lobules of the breast to the nipple) and spreads outside the ducts to surrounding normal tissue. Infiltrating ductal carcinoma can also spread through the blood and lymph systems to other parts of the body. Also called invasive ductal carcinoma.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    Invasive ductal carcinoma (IDC) of the breast begins in the lining of a breast duct (milk duct) and spreads outside the duct to other tissues in the breast. It can also spread through the blood and lymph system to other parts of the body. IDC is the most common type of invasive breast cancer.
    Invasive ductal carcinoma (IDC) of the breast; drawing shows a lobe, ducts, and fatty tissue in a cross section of the breast. An inset shows a normal duct and a duct with IDC and cancer cells spreading outside it.
  infiltrating lobular carcinoma: (IN-fil-TRAY-ting LAH-byoo-ler KAR-sih-NOH-muh)
    Pronunciation of dictionary term "infiltrating lobular carcinoma"
    A type of invasive breast cancer that begins in the lobules (milk glands) of the breast and spreads to surrounding normal tissue. It can also spread through the blood and lymph systems to other parts of the body. Also called invasive lobular carcinoma.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    Invasive lobular carcinoma begins in the lobules (milk glands) of the breast and spreads outside the lobules to other tissues in the breast. It can also spread through the blood and lymph systems to other parts of the body.
    Invasive lobular carcinoma of the breast; drawing shows a lobe, ducts, lobules, and fatty tissue in a cross section of the breast. There are also three separate pullouts showing a normal lobe, a normal lobule, and a lobule with invasive lobular carcinoma and cancer cells spreading outside it.
  inflammation: (IN-fluh-MAY-shun)
    Pronunciation of dictionary term "inflammation"
    A normal part of the body’s response to injury or infection. Inflammation occurs when the body releases chemicals that trigger an immune response to fight off infection or heal damaged tissue. Once the injury or infection is healed, the inflammatory process ends. Chronic inflammation is an abnormal immune response in which the inflammatory process does not end when it should or may begin when there is no infection or injury. Over time, chronic inflammation can damage healthy cells, tissues, and organs. This can lead to diseases such as cancer, heart disease, diabetes, asthma, Alzheimer disease, and autoimmune conditions.
  inflammatory: (in-FLA-muh-TOR-ee)
    Pronunciation of dictionary term "inflammatory"
    Having to do with inflammation (redness, swelling, pain, and a feeling of heat that helps protect tissues affected by injury or disease).
  inflammatory bowel disease: (in-FLA-muh-TOR-ee BOW-ul dih-ZEEZ)
    Pronunciation of dictionary term "inflammatory bowel disease"
    A general term that refers to the inflammation of the colon and rectum. Inflammatory bowel disease includes ulcerative colitis and Crohn disease.
  inflammatory breast cancer: (in-FLA-muh-TOR-ee brest KAN-ser)
    Pronunciation of dictionary term "inflammatory breast cancer"
    A rare, fast-growing type of breast cancer in which cancer cells block lymph vessels in the skin of the breast, causing the breast to look swollen or inflamed. Inflammatory breast cancer usually does not form a lump that can be felt and may not be seen on a mammogram. Instead, the skin of the breast may appear pink, reddish purple, or bruised and have dimpling or ridges that look like the skin of an orange. These symptoms usually come on quickly. Most inflammatory breast cancers are invasive ductal carcinomas, which means they develop from cells that line the milk ducts of the breast and then spread beyond the ducts. Inflammatory breast cancer is more commonly diagnosed in younger women, Black women, and in women with overweight or obesity.
    More Information
    - Inflammatory Breast Cancer (https://www.cancer.gov/types/breast/ibc-fact-sheet)
    Inflammatory breast cancer is a type of breast cancer in which the cancer cells block the lymph vessels in the skin of the breast. This causes the breast to look red and swollen. The skin may also appear dimpled or pitted, like the skin of an orange (peau d'orange), and the nipple may be inverted (facing inward).
    Inflammatory breast cancer of the left breast showing redness, swelling, peau d'orange, and an inverted nipple.
  inflammatory myofibroblastic tumor: (in-FLA-muh-TOR-ee MY-oh-FY-broh-BLAS-tik TOO-mer)
    Pronunciation of dictionary term "inflammatory myofibroblastic tumor"
    A rare type of cancer that is made up of smooth muscle cells, connective tissue cells, and certain types of immune cells. It can occur anywhere in the body, but it usually occurs in the lung, abdomen, pelvis, or back of the abdomen. Inflammatory myofibroblastic tumors rarely spread to other parts of the body but they are likely to recur (come back) after treatment. The tumor cells may have a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). Inflammatory myofibroblastic tumors usually occur in children and young adults. They are a type of soft tissue sarcoma.
  infliximab: (in-FLIK-sih-mab)
    Pronunciation of dictionary term "infliximab"
    A monoclonal antibody that blocks the action of a cytokine called tumor necrosis factor alfa. It is being studied in the treatment and prevention of weight loss and loss of appetite in patients with advanced cancer. It belongs to the family of drugs called monoclonal antibodies.
  influenza A virus: (IN-floo-EN-zuh … VY-rus)
    Pronunciation of dictionary term "influenza A virus"
    One of three types of virus that cause the illness called influenza (flu). The influenza A virus can infect people, birds, pigs, horses, and other animals. It is the main cause of most influenza epidemics.
  informed consent: (in-FORMD kun-SENT)
    Pronunciation of dictionary term "informed consent"
    A process in which patients are given important information, including possible risks and benefits, about a medical procedure or treatment, genetic testing, or a clinical trial. This is to help them decide if they want to be treated, tested, or take part in the trial. Patients are also given any new information that might affect their decision to continue. Also called consent process.
  infrared coagulation: (IN-fruh-RED koh-A-gyuh-LAY-shun)
    Pronunciation of dictionary term "infrared coagulation"
    A technique in which abnormal tissue is exposed to a burst of infrared light (a type of radiation). This causes blood in veins in the tissue to coagulate (harden) and the abnormal tissue to shrink. It is being studied in the prevention of anal cancer in some patients with HIV.
  infrared thermography: (IN-fruh-RED ther-MAH-gruh-fee)
    Pronunciation of dictionary term "infrared thermography"
    In medicine, a procedure in which an infrared camera (one that senses heat) is used to measure temperature differences on the surface of the body. The camera makes pictures that show areas of possible abnormal cell growth because abnormal tissue gives off more heat than normal tissue does.
  infratentorium: (IN-fruh-ten-TOR-ee-um)
    Pronunciation of dictionary term "infratentorium"
    The lower back part of the brain that contains the cerebellum and brain stem. Examples of tumors that form in the infratentorium are medulloblastomas and brain stem gliomas.
  Infugem: (in-FYOO-jem)
    Pronunciation of dictionary term "Infugem"
    A drug used alone or with other drugs to treat certain types of breast, non-small cell lung, ovarian, and pancreatic cancers that are advanced or have spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Infugem stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called gemcitabine hydrochloride and Gemzar.
    More Information
    - Gemcitabine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
  infusion: (in-FYOO-zhun)
    Pronunciation of dictionary term "infusion"
    A method of putting fluids, including drugs, into the bloodstream. Also called intravenous infusion.
  ingenol mebutate gel: (IN-jeh-nol MEH-byoo-tayt …)
    Pronunciation of dictionary term "ingenol mebutate gel"
    A drug applied to the skin to treat actinic keratosis (thick, scaly growths on the skin that may become cancer). Ingenol mebutate gel may help kill abnormal cells. It is a type of cytotoxic agent. Also called Picato.
  ingestion: (in-JES-chun)
    Pronunciation of dictionary term "ingestion"
    Taking into the body by mouth.
  inguinal orchiectomy: (IN-gwih-nul OR-kee-EK-toh-mee)
    Pronunciation of dictionary term "inguinal orchiectomy"
    An operation in which the testicle is removed through an incision in the groin.
  inhalation: (IN-huh-LAY-shun)
    Pronunciation of dictionary term "inhalation"
    In medicine, refers to the act of taking a substance into the body by breathing.
  inhaler: (in-HAY-ler)
    Pronunciation of dictionary term "inhaler"
    A device for giving medicines in the form of a spray that is inhaled (breathed in) through the nose or mouth. Inhalers are used to treat certain medical problems, such as bronchitis, angina, emphysema, and asthma. They are also used to help relieve symptoms that occur when a person is trying to quit smoking.
  inherited: (in-HAYR-ih-ted)
    Pronunciation of dictionary term "inherited"
    In medicine, describes the passing of genetic information from parent to child through the genes in sperm and egg cells. Also called hereditary.
  inherited bone marrow failure syndrome: (in-HAYR-ih-ted bone MAYR-oh FAYL-yer SIN-drome)
    Pronunciation of dictionary term "inherited bone marrow failure syndrome"
    A rare disorder in which a person’s bone marrow is unable to make enough blood cells and there is a family history of the same disorder. There are several different types of inherited bone marrow failure syndrome, and patients with one of them are at high risk of forming acute leukemia or certain solid tumors. Also called IBMFS.
  inherited cancer syndrome: (in-HAYR-ih-ted KAN-ser SIN-drome)
    Pronunciation of dictionary term "inherited cancer syndrome"
    A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Inherited cancer syndromes are caused by mutations (changes) in certain genes passed from parents to children. In an inherited cancer syndrome, certain patterns of cancer may be seen within families. These patterns include having several close family members (such as a mother, daughter, and sister) with the same type of cancer, developing cancer at an early age, or having two or more types of cancer develop in the same person. Examples of inherited cancer syndromes are hereditary breast and ovarian cancer syndrome, Li-Fraumeni syndrome, Cowden syndrome, and Lynch syndrome. Also called family cancer syndrome and hereditary cancer syndrome.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  inherited cancer syndrome: (in-HAYR-ih-ted KAN-ser SIN-drome)
    Pronunciation of dictionary term "inherited cancer syndrome"
    A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Inherited cancer syndromes are caused by mutations (changes) in certain genes passed from parents to children. In an inherited cancer syndrome, certain patterns of cancer may be seen within families. These patterns include having several close family members (such as a mother, daughter, and sister) with the same type of cancer, developing cancer at an early age, or having two or more types of cancer develop in the same person. Examples of inherited cancer syndromes are hereditary breast and ovarian cancer syndrome, Li-Fraumeni syndrome, Cowden syndrome, and Lynch syndrome. Also called family cancer syndrome and hereditary cancer syndrome.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  inherited erythroblastopenia: (in-HAYR-ih-ted eh-RITH-roh-BLAS-toh-PEE-nee-uh)
    Pronunciation of dictionary term "inherited erythroblastopenia"
    A very rare disorder in which the bone marrow doesn’t make enough red blood cells. It is usually seen in the first year of life. Patients may have deformed thumbs and other physical problems. They also have an increased risk of leukemia and sarcoma, especially osteosarcoma (bone cancer). Patients with inherited erythroblastopenia may have a mutation (change) in one of the genes that make proteins found in the cell’s ribosomes. Also called Blackfan–Diamond anemia, congenital hypoplastic anemia, congenital pure red cell aplasia, DBA, Diamond-Blackfan anemia, and erythrogenesis imperfecta.
    More Information
    - Diamond-Blackfan anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6274/diamond-blackfan-anemia)
    - Diamond-Blackfan anemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/diamond-blackfan-anemia/)
  inherited predisposition: (in-HAYR-ih-ted PREE-dih-spuh-ZIH-shun)
    Pronunciation of dictionary term "inherited predisposition"
    An inherited increase in the risk of developing a disease. Also called genetic predisposition, genetic susceptibility, and hereditary predisposition.
    More Information
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  iniparib: (ih-nih-PAR-ib)
    Pronunciation of dictionary term "iniparib"
    A substance being studied in the treatment of some types of cancer. Iniparib may kill cancer cells. Also called BSI-201.
  injection: (in-JEK-shun)
    Pronunciation of dictionary term "injection"
    Use of a syringe and needle to push fluids or drugs into the body; often called a "shot."
  Inlyta: (in-LY-tuh)
    Pronunciation of dictionary term "Inlyta"
    A drug used alone or with other drugs to treat advanced renal cell carcinoma (a type of kidney cancer). It is used in patients whose cancer has not already been treated or whose cancer has not gotten better after treatment with one other systemic therapy. It is also being studied in the treatment of other types of cancer. Inlyta blocks proteins called growth factor receptors, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Inlyta is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called axitinib.
    More Information
    - Axitinib (https://www.cancer.gov/about-cancer/treatment/drugs/axitinib)
  innate immunity: (ih-NAYT ih-MYOO-nih-tee)
    Pronunciation of dictionary term "innate immunity"
    Immunity that is present at birth and lasts a person’s entire life. Innate immunity is the first response of the body’s immune system to a harmful foreign substance. When foreign substances, such as bacteria or viruses, enter the body, certain cells in the immune system can quickly respond and try to destroy them. Innate immunity also includes barriers, such as skin, mucous membranes, tears, and stomach acid, that help keep harmful substances from entering the body.
  Innohep: (IH-noh-HEP)
    Pronunciation of dictionary term "Innohep"
    A drug that is used with another drug, warfarin, to treat blood clots that form deep in the veins and to prevent new blood clots from forming. It is a type of anticoagulant. Also called tinzaparin sodium.
  inoperable: (in-AH-peh-ruh-bul)
    Pronunciation of dictionary term "inoperable"
    Describes a condition that cannot be treated by surgery.
  inositol: (ih-NOH-sih-TOL)
    Pronunciation of dictionary term "inositol"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Inositol helps cells make membranes and respond to messages from their environment. It has the same chemical formula as glucose (the chief source of energy for living organisms) but has a different arrangement of atoms. It is found in beans, peas, brown rice, wheat bran and nuts. It is water-soluble (can dissolve in water) and must be taken in every day. Inositol is being studied in the prevention of cancer. Also called myoinositol.
  inositol hexaphosphate: (ih-NOH-sih-TOL HEK-suh-FOS-fayt)
    Pronunciation of dictionary term "inositol hexaphosphate"
    A substance found in many foods that come from plants, including corn, wheat, rice, and soybeans, and in large amounts in cereals and legumes. It is being studied in the prevention of cancer. Also called IP6 and phytic acid.
  inotuzumab ozogamicin: (ih-noh-TOO-zoo-mab OH-zoh-ga-MIH-sin)
    Pronunciation of dictionary term "inotuzumab ozogamicin"
    A drug used to treat adults and children aged 1 year and older with B-cell acute lymphoblastic leukemia that is CD22 positive (expresses the protein CD22). It is used in patients whose cancer came back or did not get better with other treatment. It is also being studied in the treatment of other types of cancer. Inotuzumab ozogamicin contains a monoclonal antibody that binds to CD22, which is found on some leukemia cells. It also contains an anticancer drug, which may help kill cancer cells. Inotuzumab ozogamicin is a type of antibody-drug conjugate. Also called Besponsa.
    More Information
    - Inotuzumab Ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/inotuzumabozogamicin)
  Inqovi: (in-KOH-vee)
    Pronunciation of dictionary term "Inqovi"
    A combination of decitabine and cedazuridine used to treat adults with myelodysplastic syndromes, including chronic myelomonocytic leukemia. It is also being studied in the treatment of other types of cancer. Decitabine stops cells from making DNA, which may help keep cancer cells from growing and may kill them. Cedazuridine prevents the breakdown of decitabine in the body, which may allow more cancer cells to be killed. Inqovi is a type of antimetabolite and a type of cytidine deaminase inhibitor. Also called decitabine and cedazuridine.
    More Information
    - Decitabine and Cedazuridine (https://www.cancer.gov/about-cancer/treatment/drugs/decitabineandcedazuridine)
  Inrebic: (in-REH-bik)
    Pronunciation of dictionary term "Inrebic"
    A drug used to treat adults with intermediate-risk or high-risk myelofibrosis (MF), including primary MF, post-polycythemia vera MF, and post-essential thrombocythemia MF. It is also being studied in the treatment of other conditions. Inrebic blocks JAK2 and other proteins, which may help keep abnormal blood cells or cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called fedratinib hydrochloride.
    More Information
    - Fedratinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/fedratinibhydrochloride)
  INS316: A substance being studied in the diagnosis of lung diseases, including lung cancer. It helps bring up a sample of mucus from deep in the lungs and improves the quality of the sample for testing. It is a type of nucleoside triphosphate.
  insomnia: (in-SOM-nee-uh)
    Pronunciation of dictionary term "insomnia"
    Difficulty in going to sleep or getting enough sleep.
    More Information
    - Sleep Problems in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-disorders)
    - Sleep Disorders
  instillation: (in-stih-LAY-shun)
    Pronunciation of dictionary term "instillation"
    In medicine, a method used to put a liquid into the body slowly or drop by drop.
  Institutional Review Board: (IN-stih-TOO-shuh-nul reh-VYOO bord)
    Pronunciation of dictionary term "Institutional Review Board"
    A group of scientists, doctors, clergy, and patient advocates that reviews and approves the detailed plan for a clinical trial. Institutional Review Boards are meant to protect the people who take part in a clinical trial. They check to see that the trial is well designed, legal, ethical, does not involve unneeded risks, and includes a safety plan for patients. There is an Institutional Review Board at every health care facility that does clinical research, and every trial is reviewed by an Institutional Review Board before the trial begins. Also called IRB.
  insulin: (IN-suh-lin)
    Pronunciation of dictionary term "insulin"
    A hormone made by the islet cells of the pancreas. Insulin controls the amount of sugar in the blood by moving it into the cells, where it can be used by the body for energy.
  insulin glargine: (IN-suh-lin GLAR-jeen)
    Pronunciation of dictionary term "insulin glargine"
    A drug used to control the amount of sugar in the blood of patients with diabetes. It is a form of the hormone insulin that is made in the laboratory. Insulin glargine controls blood sugar longer than insulin does. It is a type of therapeutic insulin. Also called insulin glargine recombinant and Lantus.
  insulin glargine recombinant: (IN-suh-lin GLAR-jeen ree-KOM-bih-nunt)
    Pronunciation of dictionary term "insulin glargine recombinant"
    A drug used to control the amount of sugar in the blood of patients with diabetes. It is a form of the hormone insulin that is made in the laboratory. Insulin glargine recombinant controls blood sugar longer than insulin does. It is a type of therapeutic insulin. Also called insulin glargine and Lantus.
  insulin glulisine: (IN-suh-lin GLOO-lih-seen)
    Pronunciation of dictionary term "insulin glulisine"
    A drug used to control the amount of sugar in the blood of patients with diabetes mellitus. It is a form of the hormone insulin that is made in the laboratory. Insulin glulisine gets into the blood faster than insulin when it is injected under the skin before or shortly after a meal. It is a type of therapeutic insulin. Also called Apidra.
  insulin-like growth factor: (IN-suh-lin-like grothe FAK-ter)
    Pronunciation of dictionary term "insulin-like growth factor"
    A protein made by the body that stimulates the growth of many types of cells. Insulin-like growth factor is similar to insulin (a hormone made in the pancreas). There are two forms of insulin-like growth factor called IGF-1 and IGF-2. Higher than normal levels of IGF-1 may increase the risk of several types of cancer. Insulin-like growth factor is a type of growth factor and a type of cytokine. Also called IGF and somatomedin.
  insulin-like growth factor receptor: (IN-suh-lin-like grothe FAK-ter reh-SEP-ter)
    Pronunciation of dictionary term "insulin-like growth factor receptor"
    A protein found on the surface of some types of cells that binds to insulin-like growth factor (IGF). This causes the cells to grow and divide. Insulin-like growth factor receptor is found at high levels on the surface of several types of cancer cells, which causes these cells to grow rapidly in the presence of IGF. Also called IGFR.
  insulinoma: (IN-suh-lih-NOH-muh)
    Pronunciation of dictionary term "insulinoma"
    An abnormal mass that grows in the beta cells of the pancreas that make insulin. Insulinomas are usually benign (not cancer). They secrete insulin and are the most common cause of low blood sugar caused by having too much insulin in the body. Also called beta cell neoplasm, beta cell tumor of the pancreas, and pancreatic insulin-producing tumor.
  integrative medicine: (IN-teh-gray-tiv MEH-dih-sin)
    Pronunciation of dictionary term "integrative medicine"
    An approach to medical care that recognizes the benefit of combining conventional (standard) therapies (such as drugs and surgery) with complementary therapies (such as acupuncture and yoga) that have been shown to be safe and effective. For example, acupuncture may be used with certain drugs to help lessen cancer pain or nausea and vomiting. Integrative medicine tries to address the physical, emotional, social, spiritual, and environmental factors that can affect a person’s health and well-being.
  integrin: (IN-teh-grin)
    Pronunciation of dictionary term "integrin"
    A type of protein found on the surface of cells that helps them attach to, and communicate with, nearby cells. Integrins also help cells attach to large molecules in the extracellular matrix, the substance that surrounds and gives structure to cells. Integrins help cells receive signals from other cells and from the surrounding environment, and they help control the activity of certain genes. They play an important role in cell growth, cell movement, and other cell functions. Integrins are involved in wound healing, blood vessel growth, and in the growth and spread of cancer cells. Drugs that target integrins are being studied in the treatment of some types of cancer.
  intensification therapy: (in-TEN-sih-fih-KAY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "intensification therapy"
    Treatment that is given after cancer has disappeared following the initial therapy. Intensification therapy is used to kill any cancer cells that may be left in the body. It may include radiation therapy, a stem cell transplant, or treatment with drugs that kill cancer cells. Also called consolidation therapy and postremission therapy.
  intensity-modulated radiation therapy: (in-TEN-sih-tee-MAH-juh-LAY-tid RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "intensity-modulated radiation therapy"
    A type of 3-dimensional radiation therapy that uses computer-generated images to show the size and shape of the tumor. Thin beams of radiation of different intensities are aimed at the tumor from many angles. This type of radiation therapy reduces the damage to healthy tissue near the tumor. Also called IMRT.
  intensive chemotherapy: (in-TEN-siv KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intensive chemotherapy"
    Treatment that uses anticancer drugs given at high doses or over several months to try to cure cancer or cause a remission. Intensive chemotherapy is used to treat certain types of cancer, including leukemia and lymphoma, and may be given with other therapy before a bone marrow or stem cell transplant. It can lower the number of normal blood-forming cells in the bone marrow and can cause other severe side effects, so it is usually given in a hospital.
  intercellular communication: (IN-ter-SEL-yoo-ler kuh-MYOO-nih-KAY-shun)
    Pronunciation of dictionary term "intercellular communication"
    The transfer of information from one cell to another. Cells signal each other by direct contact with each other or by the release of a substance from one cell that is taken up by another cell. Intercellular communication is important for cells to grow and work normally. Cells that lose the ability to respond to signals from other cells may become cancer cells. Also called cell-cell signaling and cell-to-cell signaling.
  interfering thought: (IN-ter-FEER-ing thawt)
    Pronunciation of dictionary term "interfering thought"
    An unpleasant memory or idea that occurs often in a person’s everyday thoughts and keeps him or her from thinking about other things. Interfering thoughts can make sleep difficult and make a person unable to carry out daily activities. Also called intrusive thought.
  interferon: (in-ter-FEER-on)
    Pronunciation of dictionary term "interferon"
    A natural substance that helps the body’s immune system fight infection and other diseases, such as cancer. Interferons are made in the body by white blood cells and other cells, but they can also be made in the laboratory to use as treatments for different diseases. In cancer therapy, interferons may help keep cancer cells from growing and may help kill cancer cells. There are three main types of interferons: interferon-alfa, interferon-beta, and interferon-gamma. An interferon is a type of cytokine and type of immunomodulating agent.
  interferon alfa-2b: (in-ter-FEER-on AL-fuh …)
    Pronunciation of dictionary term "interferon alfa-2b"
    A drug used alone or with other drugs to treat adults with AIDS-related Kaposi sarcoma, hairy cell leukemia, certain types of follicular lymphoma or melanoma, genital warts or perianal warts, or chronic hepatitis B or C. It is also being studied in the treatment of other types of cancer and other conditions. Interferon alfa-2b is a form of interferon alfa (a substance normally made by cells in the immune system) that is made in the laboratory. It is a type of cytokine and a type of immunomodulating agent. Also called IFN alpha-2B, Intron A, and recombinant interferon alfa-2b.
    More Information
    - Recombinant Interferon Alfa-2b (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-interferon-alfa-2b)
  interleukin: (in-ter-LOO-kin)
    Pronunciation of dictionary term "interleukin"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukins regulate immune responses. Interleukins made in the laboratory are used as biological response modifiers to boost the immune system in cancer therapy. An interleukin is a type of cytokine. Also called IL.
  interleukin-1: (in-ter-LOO-kin …)
    Pronunciation of dictionary term "interleukin-1"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-1 is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. There are two forms of interleukin-1, alpha and beta, which act the same. Interleukin-1 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-1 is a type of cytokine. Also called IL-1.
  interleukin-1-alfa: (in-ter-LOO-kin ... AL-fuh)
    Pronunciation of dictionary term "interleukin-1-alfa"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-1-alfa, one form of interleukin-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of interleukin-1, interleukin-1-beta, acts the same as interleukin-1-alfa. Interleukin-1-alfa made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-1-alfa is a type of cytokine. Also called IL-1-alfa, IL-1-alpha, and interleukin-1-alpha.
  interleukin-1-alpha: (in-ter-LOO-kin … AL-fuh)
    Pronunciation of dictionary term "interleukin-1-alpha"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-1-alpha, one form of interleukin-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of interleukin-1, interleukin-1-beta, acts the same as interleukin-1-alpha. Interleukin-1-alpha made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-1-alpha is a type of cytokine. Also called IL-1-alfa, IL-1-alpha, and interleukin-1-alfa.
  interleukin-1-beta: (in-ter-LOO-kin ... BAY-tuh)
    Pronunciation of dictionary term "interleukin-1-beta"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-1-beta, one form of interleukin-1, is made mainly by one type of white blood cell, the macrophage, and helps another type of white blood cell, the lymphocyte, fight infections. It also helps leukocytes pass through blood vessel walls to sites of infection and causes fever by affecting areas of the brain that control body temperature. The other form of interleukin-1, interleukin-1-alpha, acts the same as interleukin-1-beta. Interleukin-1-beta made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-1-beta is a type of cytokine. Also called IL-1-beta and IL-1B.
  interleukin-10: (in-ter-LOO-kin …)
    Pronunciation of dictionary term "interleukin-10"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-10 is made by activated macrophages and by some T lymphocytes. It reduces inflammation by blocking production of cytokines by immune cells. Interleukin-10 also increases antibody production by plasma cells and helps them live longer. Interleukin-10 made in the laboratory is used as a biological response modifier to boost the immune system. It is a type of cytokine. Also called IL-10.
  interleukin-11: (in-ter-LOO-kin...)
    Pronunciation of dictionary term "interleukin-11"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-11 is made by support cells in the bone marrow. It causes the growth of several types of blood cells. Oprelvekin (interleukin-11 made in the laboratory) is used as a biological response modifier to increase the number of platelets, especially in patients receiving chemotherapy for cancer. Interleukin-11 is a type of cytokine. Also called IL-11.
  interleukin-12: (in-ter-LOO-kin ...)
    Pronunciation of dictionary term "interleukin-12"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-12 is made mainly by B lymphocytes and macrophages. It causes other immune cells to make cytokines and increases the growth of T lymphocytes. It may also block the growth of new blood vessels. Interleukin-12 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-12 is a type of cytokine. Also called IL-12.
  interleukin-13: (in-ter-LOO-kin …)
    Pronunciation of dictionary term "interleukin-13"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-13 is made by a type of T lymphocyte. It reduces inflammation by blocking production of cytokines by macrophages. It also increases the number and activity of B lymphocytes. Interleukin-13 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. It is a type of cytokine. Also called IL-13.
  interleukin-13 PE38QQR immunotoxin: (in-ter-LOO-kin … IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "interleukin-13 PE38QQR immunotoxin"
    A substance being studied in the treatment of cancer. It is made by combining interleukin-13 with a toxin from Pseudomonas bacteria. It is a type of recombinant chimeric protein.
  interleukin-2: (in-ter-LOO-kin...)
    Pronunciation of dictionary term "interleukin-2"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-2 is made by a type of T lymphocyte. It increases the growth and activity of other T lymphocytes and B lymphocytes, and affects the development of the immune system. Aldesleukin (interleukin-2 made in the laboratory) is being used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-2 is a type of cytokine. Also called IL-2.
  interleukin-3: (in-ter-LOO-kin...)
    Pronunciation of dictionary term "interleukin-3"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-3 is made mainly by a type of T lymphocyte. It increases the number of blood cells made by the bone marrow. Interleukin-3 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-3 is a type of cytokine. Also called IL-3.
  interleukin-4: (in-ter-LOO-kin...)
    Pronunciation of dictionary term "interleukin-4"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-4 is made by a type of T lymphocyte. It causes B lymphocytes to increase and to make antibodies and also increases the production of T lymphocytes. Interleukin-4 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-4 is a type of cytokine. Also called IL-4.
  interleukin-4 PE38KDEL cytotoxin: (in-ter-LOO-kin ... SY-toh-TOK-sin)
    Pronunciation of dictionary term "interleukin-4 PE38KDEL cytotoxin"
    A substance being studied in the treatment of cancer. It is made by combining interleukin-4 with a bacterial toxin. Interleukin-4 PE38KDEL cytotoxin is a type of recombinant chimeric protein. Also called interleukin-4 PE38KDEL immunotoxin and NBI-3001.
  interleukin-4 PE38KDEL immunotoxin: (in-ter-LOO-kin ... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "interleukin-4 PE38KDEL immunotoxin"
    A substance being studied in the treatment of cancer. It is made by combining interleukin-4 with a bacterial toxin. Interleukin-4 PE38KDEL immunotoxin is a type of recombinant chimeric protein. Also called interleukin-4 PE38KDEL cytotoxin and NBI-3001.
  interleukin-5: (in-ter-LOO-kin …)
    Pronunciation of dictionary term "interleukin-5"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-5 is made mainly by some T lymphocytes. It causes B lymphocytes to make more antibodies and increases the number of eosinophils. Interleukin-5 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. It is a type of cytokine. Also called IL-5.
  interleukin-6: (in-ter-LOO-kin...)
    Pronunciation of dictionary term "interleukin-6"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-6 is made mainly by some T lymphocytes. It causes B lymphocytes to make more antibodies and also causes fever by affecting areas of the brain that control body temperature. Interleukin-6 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-6 is a type of cytokine. Also called IL-6.
  interleukin-7: (in-ter-LOO-kin...)
    Pronunciation of dictionary term "interleukin-7"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Interleukin-7 is made by cells that cover and support organs, glands, and other structures in the body. It causes the growth of T lymphocytes and B lymphocytes. Interleukin-7 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Interleukin-7 is a type of cytokine. Also called IL-7 and lymphopoietin-1.
  intermediate grade: (IN-ter-MEE-dee-ut grayd)
    Pronunciation of dictionary term "intermediate grade"
    A term used to describe how abnormal cancer cells look under a microscope. Intermediate-grade cancer cells look more abnormal than low-grade cancer cells but not as abnormal as high-grade cancer cells. They also tend to grow and spread more quickly than low-grade cancer cells but not as quickly as high-grade cancer cells. Cancer cell grade, along with cancer type and stage, may be used to help plan treatment and determine prognosis.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  intermediate-grade DCIS: (IN-ter-MEE-dee-ut-grayd …)
    Pronunciation of dictionary term "intermediate-grade DCIS"
    A condition in which cells that look somewhat abnormal under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Intermediate-grade DCIS tends to grow more quickly than low-grade DCIS but not as quickly as high-grade DCIS. It is also more likely than low-grade DCIS to come back or become invasive breast cancer and spread to other tissues but not as likely as high-grade DCIS. Also called grade II DCIS, grade II ductal carcinoma in situ, and intermediate-grade ductal carcinoma in situ.
  intermediate-grade ductal carcinoma in situ: (IN-ter-MEE-dee-ut-grayd DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "intermediate-grade ductal carcinoma in situ"
    A condition in which cells that look somewhat abnormal under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Intermediate-grade ductal carcinoma in situ tends to grow more quickly than low-grade ductal carcinoma in situ but not as quickly as high-grade ductal carcinoma in situ. It is also more likely than low-grade ductal carcinoma in situ to come back or become invasive breast cancer and spread to other tissues but not as likely as high-grade ductal carcinoma in situ. Also called grade II DCIS, grade II ductal carcinoma in situ, and intermediate-grade DCIS.
  intermediate-grade lymphoma: (IN-ter-MEE-dee-ut-grayd lim-FOH-muh)
    Pronunciation of dictionary term "intermediate-grade lymphoma"
    A type of lymphoma that grows and spreads quickly and has severe symptoms. Also called aggressive lymphoma and high-grade lymphoma.
  internal exam: (in-TER-nul eg-ZAM)
    Pronunciation of dictionary term "internal exam"
    A physical exam of the vulva, vagina, cervix, uterus, fallopian tubes, ovaries, and rectum. First, the vulva is checked for redness, swelling, sores, or other abnormalities. A speculum is then inserted into the vagina to widen it so the vagina and cervix can be checked for signs of disease. Cell samples may be taken for a Pap test or HPV test to screen for cervical cancer. The health care provider then inserts one or two lubricated, gloved fingers of one hand into the vagina and presses on the lower abdomen with the other hand to feel for lumps and check the size, shape, and position of the uterus and ovaries. The rectum may also be checked for lumps or abnormal areas. Also called pelvic exam.
    More Information
    - Cervical Cancer Screening
    Pelvic exam. A doctor or nurse inserts one or two lubricated, gloved fingers of one hand into the vagina and presses on the lower abdomen with the other hand. This is done to feel the size, shape, and position of the uterus and ovaries. The vagina, cervix, fallopian tubes, and rectum are also checked.
    Pelvic exam; drawing shows a side view of the female reproductive anatomy during a pelvic exam. The uterus, left fallopian tube, left ovary, cervix, vagina, bladder, and rectum are shown. Two gloved fingers of one hand of the doctor or nurse are shown inserted into the vagina, while the other hand is shown pressing on the lower abdomen. The inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
    Pap test. A speculum is inserted into the vagina to widen it. Then, a brush is inserted into the vagina to collect cells from the cervix. The cells are checked under a microscope for signs of disease.
    Pap test; drawing shows a side view of the female reproductive anatomy during a Pap test. A speculum is shown widening the opening of the vagina. A brush is shown inserted into the open vagina and touching the cervix at the base of the uterus. The rectum is also shown. One inset shows the brush touching the center of the cervix. A second inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
  internal medicine: (in-TER-nul MEH-dih-sin)
    Pronunciation of dictionary term "internal medicine"
    A branch of medicine that specializes in preventing, diagnosing, and treating diseases in adults, without using surgery. An internal medicine doctor is often a person’s main health care provider and may coordinate treatment given by other specialists.
  internal radiation therapy: (in-TER-nul RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "internal radiation therapy"
    A type of radiation therapy in which a source of radiation is put inside the body. Brachytherapy is a type internal radiation therapy that involves placing radioactive implants, such as pellets, seeds, ribbons, wires, needles, balloons, or capsules, in the body, directly into or near the tumor. Systemic radiation therapy is a type of internal radiation therapy that uses a source of radiation that is swallowed or injected into the body and travels through the blood, finding and killing tumor cells throughout the body.
    More Information
    - Brachytherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/brachytherapy?redirect=true)
  internal tandem duplication: (in-TER-nul TAN-dem DOO-plih-KAY-shun)
    Pronunciation of dictionary term "internal tandem duplication"
    A type of genetic change in which a DNA sequence in a gene is copied and inserted right after the original DNA sequence. This changes the sequence of the gene, which can affect the function of the protein made from the gene. Internal tandem duplications are associated with certain types of cancer, such as acute myeloid leukemia. Also called ITD.
  International Unit: (IN-ter-NA-shuh-nul YOO-nit)
    Pronunciation of dictionary term "International Unit"
    A unit used to measure the activity of many vitamins, hormones, enzymes, and drugs. An International Unit is the amount of a substance that has a certain biological effect. For each substance there is an international agreement on the biological effect that is expected for 1 International Unit. Also called IU.
  internist: (in-TER-nist)
    Pronunciation of dictionary term "internist"
    A doctor who has special training in internal medicine. An internist works with adult patients to prevent, diagnose, and treat diseases without using surgery.
  interstitial cell-stimulating hormone: (IN-ter-STIH-shul sel-STIM-yoo-LAY-ting HOR-mone)
    Pronunciation of dictionary term "interstitial cell-stimulating hormone"
    A hormone made in the pituitary gland. In females, it acts on the ovaries to make follicles release their eggs and to make hormones that get the uterus ready for a fertilized egg to be implanted. In males, it acts on the testes to cause cells to grow and make testosterone. Also called LH, luteinizing hormone, and lutropin.
  interstitial fluid: (IN-ter-STIH-shul FLOO-id)
    Pronunciation of dictionary term "interstitial fluid"
    Fluid found in the spaces around cells. It comes from substances that leak out of blood capillaries (the smallest type of blood vessel). It helps bring oxygen and nutrients to cells and to remove waste products from them. As new interstitial fluid is made, it replaces older fluid, which drains towards lymph vessels. When it enters the lymph vessels, it is called lymph. Also called tissue fluid.
  interstitial radiation therapy: (IN-ter-STIH-shul RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "interstitial radiation therapy"
    A type of internal radiation therapy in which radioactive material sealed in needles, seeds, wires, or catheters is placed directly into a tumor or body tissue.
  interval breast cancer: (IN-ter-vul brest KAN-ser)
    Pronunciation of dictionary term "interval breast cancer"
    Breast cancer that is diagnosed during the time between a regular screening mammogram that appears normal and the next screening mammogram. A “true” interval breast cancer was not present when the last screening mammogram was done. A “missed” interval breast cancer was present but missed when the last screening mammogram was read. Interval breast cancers tend to be larger, grow and spread more quickly, and have a worse prognosis than those found on screening mammograms. Researchers are studying interval breast cancer to learn how to identify women who may need more frequent mammograms or other screening tests for breast cancer.
  intervention: (IN-ter-VEN-shun)
    Pronunciation of dictionary term "intervention"
    In medicine, a treatment, procedure, or other action taken to prevent or treat disease, or improve health in other ways.
  intervention group: (IN-ter-VEN-shun groop)
    Pronunciation of dictionary term "intervention group"
    The group in a clinical research study that receives the drug, vaccine, or other intervention being tested. Interventions may also include medical procedures (such as radiation therapy and surgery), medical devices, behavior changes (such as diet and exercise), education programs, and counseling. Also called experimental group and investigational group.
  intestinal: (in-TES-tih-nul)
    Pronunciation of dictionary term "intestinal"
    Having to do with the intestines.
  intestinal flora: (in-TES-tih-nul FLOR-uh)
    Pronunciation of dictionary term "intestinal flora"
    Bacteria and other organisms that live inside the intestines. They help digest food. Vitamins such as biotin and vitamin K are made by intestinal flora. Also called gut flora, gut microflora, intestinal microflora, and microflora.
  intestinal microflora: (in-TES-tih-nul MY-kroh-FLOR-uh)
    Pronunciation of dictionary term "intestinal microflora"
    Bacteria and other organisms that live inside the intestines. They help digest food. Vitamins such as biotin and vitamin K are made by intestinal microflora. Also called gut flora, gut microflora, intestinal flora, and microflora.
  intestinal obstruction: (in-TES-tih-nul ub-STRUK-shun)
    Pronunciation of dictionary term "intestinal obstruction"
    A partial or complete block of the small or large intestine that keeps food, liquid, gas, and stool from moving through the intestines in a normal way. Intestinal obstructions may be caused by a twist in the intestines, hernias, inflammation, scar tissue from surgery, and certain types of cancer, such as cancers of the stomach, colon, and ovary. They may also be caused by conditions that affect the muscles of the intestine, such as paralysis. Signs and symptoms may include pain and swelling in the abdomen, constipation, diarrhea, vomiting, and problems passing gas. Most intestinal obstructions occur in the small intestine. Also called bowel obstruction.
    More Information
    - Bowel Obstruction and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/bowel-obstruction)
    A bowel obstruction is a serious condition that occurs when the small intestine or large intestine becomes blocked. The blockage stops food and stool from moving through the intestines. A bowel obstruction can be caused by certain cancers and cancer treatments.
    Drawing showing a large mass of dark brown stool in the large intestine caused by a tumor blockage. The tumor is at the end of the large intestine just before the rectum. Also shown are other parts of the digestive tract, including the stomach, small intestine, rectum, and anus.
  intestinal villi: (in-TES-tih-nul VIH-ly)
    Pronunciation of dictionary term "intestinal villi"
    Tiny hair-like projections that line the inside of the small intestine. They contain blood vessels and help absorb nutrients.
  intestine: (in-TES-tin)
    Pronunciation of dictionary term "intestine"
    The long, tube-shaped organ in the abdomen that completes the process of digestion. The intestine has two parts, the small intestine and the large intestine. Also called bowel.
    More Information
    - Small Intestine Cancer (https://www.cancer.gov/types/small-intestine)
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
  intoplicine: (in-TOP-lih-seen)
    Pronunciation of dictionary term "intoplicine"
    A substance that has been studied in the treatment of some types of cancer. Intoplicine blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor.
  intoxicating pepper: (in-TOK-sih-KAYT-ing PEH-per)
    Pronunciation of dictionary term "intoxicating pepper"
    An herb native to islands in the South Pacific. Substances taken from the root have been used in some cultures to relieve stress, anxiety, tension, sleeplessness, and problems of menopause. Intoxicating pepper may increase the effect of alcohol and of certain drugs used to treat anxiety and depression. The U.S. Food and Drug Administration advises users that intoxicating pepper may cause severe liver damage. The scientific name is Piper methysticum. Also called kava kava, rauschpfeffer, tonga, and yangona.
  intra-arterial: (IN-truh-ar-TEER-ee-ul)
    Pronunciation of dictionary term "intra-arterial"
    Within an artery (blood vessel that carries blood from the heart to tissues and organs in the body).
  intra-arterial brachytherapy: (IN-truh-ar-TEER-ee-ul BRAY-kee-THAYR-uh-pee)
    Pronunciation of dictionary term "intra-arterial brachytherapy"
    A type of radiation therapy used to treat liver cancer or cancer that has spread to the liver. A thin, flexible tube is used to inject tiny beads that hold the radioactive substance yttrium Y 90 into the main blood vessel that carries blood to the liver. The beads collect in the tumor and in blood vessels near the tumor, and the yttrium Y 90 gives off radiation. This destroys the blood vessels that the tumor needs to grow and kills the cancer cells. Intra-arterial brachytherapy is a type of internal radiation therapy. Also called radioembolization.
  intracarotid infusion: (IN-truh-kuh-RAH-tid in-FYOO-zhun)
    Pronunciation of dictionary term "intracarotid infusion"
    The introduction of fluids and drugs directly into the carotid artery, the main artery in the neck that carries blood from the heart to the brain.
  intracavitary: (IN-truh-KA-vih-tayr-ee)
    Pronunciation of dictionary term "intracavitary"
    Within a cavity or space, such as the abdomen, pelvis, or chest.
  intracavitary radiation therapy: (IN-truh-KA-vih-tayr-ee RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "intracavitary radiation therapy"
    A type of internal radiation therapy in which radioactive material sealed in needles, seeds, wires, or catheters is placed directly into a body cavity such as the chest cavity or the vagina.
  intracellular: (IN-truh-SEL-yoo-ler)
    Pronunciation of dictionary term "intracellular"
    Inside a cell.
  intracellular matrix: (IN-truh-SEL-yoo-ler MAY-trix)
    Pronunciation of dictionary term "intracellular matrix"
    The large network consisting of protein fibers and other molecules that gives shape and structure to cells in the body. The intracellular matrix helps organize structures within the cell called organelles and other substances found in the fluid inside the cell. It plays an important role in many cell functions, including cell movement, signaling, and division. Abnormal changes in the intracellular matrix may lead to the development of many different diseases, including cancer. The intracellular matrix can also affect how cancer cells grow and spread in the body. Also called cytoskeleton.
  intracolonic: (IN-truh-koh-LAH-nik)
    Pronunciation of dictionary term "intracolonic"
    Within the colon.
  intracranial tumor: (IN-truh-KRAY-nee-ul TOO-mer)
    Pronunciation of dictionary term "intracranial tumor"
    A tumor that occurs in the brain.
  intracutaneous: (IN-truh-kyoo-TAY-nee-us)
    Pronunciation of dictionary term "intracutaneous"
    Within the skin. Also called intradermal.
  intradermal: (IN-truh-DER-mul)
    Pronunciation of dictionary term "intradermal"
    Within the skin. Also called intracutaneous.
  intraductal breast carcinoma: (IN-truh-DUK-tul brest KAR-sih-NOH-muh)
    Pronunciation of dictionary term "intraductal breast carcinoma"
    A condition in which abnormal cells are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. In some cases, intraductal breast carcinoma may become invasive breast cancer and spread to other tissues. At this time, there is no way to know which abnormal cells could become invasive. Also called DCIS and ductal carcinoma in situ.
    Ductal carcinoma in situ (DCIS). Abnormal cells are found in the lining of a breast duct.
    Ductal carcinoma in situ (DCIS); drawing shows a lobe, ducts, and fatty tissue in a cross section of the breast. The inset shows a normal duct and a duct with abnormal cells.
  intraductal breast papilloma: (IN-truh-DUK-tul brest PA-pih-LOH-muh)
    Pronunciation of dictionary term "intraductal breast papilloma"
    A benign (not cancer), wart-like growth in a milk duct of the breast. It is usually found close to the nipple and may cause a discharge from the nipple. It may also cause pain and a lump in the breast that can be felt. It usually affects women aged 35-55 years. Having a single papilloma does not increase the risk of breast cancer. When there are multiple intraductal breast papillomas, they are usually found farther from the nipple. There may not be a nipple discharge and the papillomas may not be felt. Having multiple intraductal breast papillomas may increase the risk of breast cancer. Also called intraductal papilloma.
  intraductal carcinoma of the prostate: (IN-truh-DUK-tul KAR-sih-NOH-muh ... PROS-tayt)
    Pronunciation of dictionary term "intraductal carcinoma of the prostate"
    A type of cancer that usually begins in the glandular (secretory) tissue that lines the prostate and spreads to the ducts within the prostate. Intraductal carcinoma of the prostate tends to be large when it is found and tends to grow and spread quickly to other parts of the body. It usually has a poor prognosis (chance of recovery) and is likely to come back after treatment. Also called IDC-P and intraductal prostate carcinoma.
  intraductal papilloma: (IN-truh-DUK-tul PA-pih-LOH-muh)
    Pronunciation of dictionary term "intraductal papilloma"
    A benign (not cancer), wart-like growth in a milk duct of the breast. It is usually found close to the nipple and may cause a discharge from the nipple. It may also cause pain and a lump in the breast that can be felt. It usually affects women aged 35-55 years. Having a single papilloma does not increase the risk of breast cancer. When there are multiple intraductal papillomas, they are usually found farther from the nipple. There may not be a nipple discharge and the papillomas may not be felt. Having multiple intraductal papillomas may increase the risk of breast cancer. Also called intraductal breast papilloma.
  intraductal prostate carcinoma: (IN-truh-DUK-tul PROS-tayt KAR-sih-NOH-muh)
    Pronunciation of dictionary term "intraductal prostate carcinoma"
    A type of cancer that usually begins in the glandular (secretory) tissue that lines the prostate and spreads to the ducts within the prostate. Intraductal prostate carcinoma tends to be large when it is found and tends to grow and spread quickly to other parts of the body. It usually has a poor prognosis (chance of recovery) and is likely to come back after treatment. Also called IDC-P and intraductal carcinoma of the prostate.
  intraepithelial: (IN-truh-eh-pih-THEE-lee-ul)
    Pronunciation of dictionary term "intraepithelial"
    Within the layer of cells that form the surface or lining of an organ.
  intraepithelial neoplasia: (IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "intraepithelial neoplasia"
    A term used to describe the presence of abnormal cells on the surface of or in the tissue that lines an organ, such as the cervix, breast, prostate, anus, vagina, vulva, penis, and mouth. The changes in the cells may be low grade or high grade, depending on how abnormal the cells look under a microscope and how much of the tissue is affected. Sometimes, the abnormal cells may become cancer and spread to nearby normal tissue. Also called IEN.
  intrahepatic: (IN-truh-heh-PA-tik)
    Pronunciation of dictionary term "intrahepatic"
    Within the liver.
  intrahepatic bile duct: (IN-truh-heh-PA-tik bile dukt)
    Pronunciation of dictionary term "intrahepatic bile duct"
    A bile duct that passes through and drains bile from the liver.
    Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
  intrahepatic bile duct cancer: (IN-truh-heh-PA-tik bile dukt KAN-ser)
    Pronunciation of dictionary term "intrahepatic bile duct cancer"
    A rare cancer that forms in the bile ducts inside the liver. A bile duct is a tube that carries bile (fluid made by the liver) between the liver and gallbladder and the small intestine. Only a small number of bile duct cancers are intrahepatic.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
  intrahepatic infusion: (IN-truh-heh-PA-tik in-FYOO-zhun)
    Pronunciation of dictionary term "intrahepatic infusion"
    The delivery of anticancer drugs directly to the blood vessels of the liver.
  intralesional: (IN-truh-LEE-zhuh-nul)
    Pronunciation of dictionary term "intralesional"
    Within an area of cancer, for example, within a tumor in the skin.
  intraluminal intubation and dilation: (IN-truh-LOO-mih-nul IN-too-BAY-shun … dy-LAY-shun)
    Pronunciation of dictionary term "intraluminal intubation and dilation"
    A procedure in which a plastic or metal tube is inserted through the mouth into the esophagus (the tube that carries food to the stomach) to keep it open. This procedure may be used during radiation therapy for esophageal cancer.
  intramuscular: (IN-truh-MUS-kyoo-ler)
    Pronunciation of dictionary term "intramuscular"
    Within or into muscle. Also called IM.
  intramuscular injection: (IN-truh-MUS-kyoo-ler in-JEK-shun)
    Pronunciation of dictionary term "intramuscular injection"
    Injection into muscle.
  intraocular: (IN-truh-AH-kyoo-ler)
    Pronunciation of dictionary term "intraocular"
    Within the eyeball.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  intraocular melanoma: (IN-truh-AH-kyoo-ler MEH-luh-NOH-muh)
    Pronunciation of dictionary term "intraocular melanoma"
    A rare cancer that begins in the cells that make the dark-colored pigment, called melanin, in the uvea or uveal tract of the eye. The uvea is the middle layer of the wall of the eye and includes the iris, the ciliary body, and the choroid. Intraocular melanoma of the iris is usually a small tumor that grows slowly and rarely spreads to other parts of the body. Intraocular melanoma of the ciliary body and choroid are usually larger tumors and are more likely to spread to other parts of the body. Intraocular melanoma is the most common type of eye cancer in adults. Also called uveal melanoma.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  intraoperative radiation therapy: (IN-truh-AH-pruh-tiv RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "intraoperative radiation therapy"
    Radiation treatment aimed directly at a tumor during surgery. Also called IORT.
  intraoperative ultrasound: (IN-truh-AH-pruh-tiv UL-truh-sownd)
    Pronunciation of dictionary term "intraoperative ultrasound"
    A procedure that uses ultrasound (high-energy sound waves that are bounced off internal tissues and organs) during surgery. Sonograms (pictures made by ultrasound) of the inside of the body are viewed on a computer to help a surgeon find tumors or other problems during the operation. Also called IOUS.
  intrapelvic: (IN-truh-PEL-vik)
    Pronunciation of dictionary term "intrapelvic"
    Within the pelvis, the lower part of the abdomen between the hip bones.
  intrapericardial chemotherapy: (IN-truh-PAYR-ih-KAR-dee-ul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intrapericardial chemotherapy"
    A type of treatment in which anticancer drugs are injected through a thin tube directly into the pericardium (the sac around the heart). Intrapericardial chemotherapy may be used to treat a condition called malignant pericardial effusion, in which fluid collects in the pericardium. It is most often caused by lung cancer, breast cancer, melanoma, leukemia, and lymphoma.
  intraperitoneal: (IN-truh-PAYR-ih-toh-NEE-ul)
    Pronunciation of dictionary term "intraperitoneal"
    Within the peritoneal cavity (the area that contains the abdominal organs). Also called IP.
  intraperitoneal chemotherapy: (IN-truh-PAYR-ih-toh-NEE-ul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intraperitoneal chemotherapy"
    Treatment in which anticancer drugs are put directly into the abdominal cavity through a thin tube.
  intraperitoneal infusion: (IN-truh-PAYR-ih-toh-NEE-ul in-FYOO-zhun)
    Pronunciation of dictionary term "intraperitoneal infusion"
    A method of delivering fluids and drugs directly into the abdominal cavity through a thin tube. Also called peritoneal infusion.
  intraperitoneal radiation therapy: (IN-truh-PAYR-ih-toh-NEE-ul RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "intraperitoneal radiation therapy"
    Treatment in which a radioactive liquid is put directly into the abdomen through a thin tube.
  intrapleural: (IN-truh-PLOOR-ul)
    Pronunciation of dictionary term "intrapleural"
    Within the pleural cavity.
  intraspinal: (IN-truh-SPY-nul)
    Pronunciation of dictionary term "intraspinal"
    Within the spine (backbone).
  intrathecal: (IN-truh-THEE-kul)
    Pronunciation of dictionary term "intrathecal"
    Describes the fluid-filled space between the thin layers of tissue that cover the brain and spinal cord. Drugs can be injected into the fluid or a sample of the fluid can be removed for testing.
    Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.
    Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.
  intrathecal chemotherapy: (IN-truh-THEE-kul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intrathecal chemotherapy"
    Treatment in which anticancer drugs are injected into the fluid-filled space between the thin layers of tissue that cover the brain and spinal cord.
    Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.
    Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.
  intratumoral: (IN-truh-TOO-mer-ul)
    Pronunciation of dictionary term "intratumoral"
    Within a tumor.
  intrauterine: (IN-truh-YOO-teh-rin)
    Pronunciation of dictionary term "intrauterine"
    Inside the uterus (the small, hollow, pear-shaped organ in a woman’s pelvis in which a fetus develops).
  intrauterine device: (IN-truh-YOO-teh-rin dee-VISE)
    Pronunciation of dictionary term "intrauterine device"
    A small, plastic T-shaped device that is placed inside the uterus (the small, hollow, pear-shaped organ in a woman’s pelvis in which a fetus develops) to prevent pregnancy. Intrauterine devices prevent sperm from fertilizing an egg, and prevent fertilized eggs from implanting in the uterus. The use of intrauterine devices is also being studied in the prevention and treatment of endometrial cancer and other conditions. Also called IUD.
  intravaginal: (IN-truh-VA-jih-nul)
    Pronunciation of dictionary term "intravaginal"
    Having to do with the inside of the vagina (the birth canal).
  intravasation: (in-TRA-vuh-SAY-shun)
    Pronunciation of dictionary term "intravasation"
    The movement of a cell or a foreign substance through the wall of a blood or lymph vessel into the vessel itself. In cancer, this is how cancer cells pass through a vessel wall and enter the blood or lymph systems. It is one way that cancer spreads in the body.
  intravenous: (IN-truh-VEE-nus)
    Pronunciation of dictionary term "intravenous"
    Into or within a vein. Intravenous usually refers to a way of giving a drug or other substance through a needle or tube inserted into a vein. Also called IV.
  intravenous chemotherapy: (IN-truh-VEE-nus KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intravenous chemotherapy"
    Treatment in which anticancer drugs are given through a needle or tube inserted into a vein. The anticancer drugs travel through the blood to kill cancer cells in the body.
    Intravenous (IV) chemotherapy. A patient is given an anti-cancer drug through a vein in the arm. The anti-cancer drug travels through the blood to kill cancer cells in the body.
    Intravenous (IV) chemotherapy; drawing of an anti-cancer drug being given to a patient through a vein in the arm.
  intravenous immunoglobulin: (IN-truh-VEE-nus IH-myoo-noh-GLAH-byoo-lin)
    Pronunciation of dictionary term "intravenous immunoglobulin"
    A substance made from antibodies that have been taken from the blood of many healthy donors. It is given to a patient through a needle or tube inserted into a vein. Intravenous immunoglobulins are used to treat certain types of immune disorders in which there are low amounts of antibodies in the blood. They are also used to treat many different autoimmune disorders, infections, or other conditions. They may also be used to help prevent infections in patients who have had a stem cell or organ transplant. Intravenous immunoglobulins are a type of immunotherapy. Also called IVIG.
  intravenous infusion: (IN-truh-VEE-nus in-FYOO-zhun)
    Pronunciation of dictionary term "intravenous infusion"
    A method of putting fluids, including drugs, into the bloodstream. Also called infusion.
  intravenous injection: (IN-truh-VEE-nus in-JEK-shun)
    Pronunciation of dictionary term "intravenous injection"
    Injection into a vein.
  intravenous pyelogram: (IN-truh-VEE-nus PY-eh-loh-gram)
    Pronunciation of dictionary term "intravenous pyelogram"
    An x-ray image of the kidneys, ureters, and bladder, and prostate in men, that is taken after a contrast dye is injected into a vein. As the dye travels through the bloodstream, it collects in these organs, turning them bright white. This allows the health care provider to see blockages or other urinary tract problems on the x-ray pictures. An intravenous pyelogram may be used to help diagnose certain urinary tract conditions, such as kidney or bladder stones, kidney cysts, urinary tract tumors, and an enlarged prostate. Also called intravenous urogram, IVP, and IVU.
  intravenous pyelography: (IN-truh-VEE-nus PY-eh-LAH-gruh-fee)
    Pronunciation of dictionary term "intravenous pyelography"
    An x-ray exam of the kidneys, ureters, and bladder, and prostate in men, that uses a contrast dye injected into a vein. As the dye travels through the bloodstream, it collects in these organs, turning them bright white. This allows the health care provider to see blockages or other urinary tract problems on the x-ray pictures. Intravenous pyelography may be used to help diagnose certain urinary tract conditions, such as kidney or bladder stones, kidney cysts, urinary tract tumors, and an enlarged prostate. Also called intravenous urography.
  intravenous urogram: (IN-truh-VEE-nus YOOR-oh-gram)
    Pronunciation of dictionary term "intravenous urogram"
    An x-ray image of the kidneys, ureters, and bladder, and prostate in men, that is taken after a contrast dye is injected into a vein. As the dye travels through the bloodstream, it collects in these organs, turning them bright white. This allows the health care provider to see blockages or other urinary tract problems on the x-ray pictures. An intravenous urogram may be used to help diagnose certain urinary tract conditions, such as kidney or bladder stones, kidney cysts, urinary tract tumors, and an enlarged prostate. Also called intravenous pyelogram, IVP, and IVU.
  intravenous urography: (IN-truh-VEE-nus yoor-AH-gruh-fee)
    Pronunciation of dictionary term "intravenous urography"
    An x-ray exam of the kidneys, ureters, and bladder, and prostate in men, that uses a contrast dye injected into a vein. As the dye travels through the bloodstream, it collects in these organs, turning them bright white. This allows the health care provider to see blockages or other urinary tract problems on the x-ray pictures. Intravenous urography may be used to help diagnose certain urinary tract conditions, such as kidney or bladder stones, kidney cysts, urinary tract tumors, and an enlarged prostate. Also called intravenous pyelography.
  intraventricular infusion: (IN-truh-ven-TRIH-kyoo-ler in-FYOO-zhun)
    Pronunciation of dictionary term "intraventricular infusion"
    The delivery of a drug into a fluid-filled cavity within the heart or brain.
  intravesical: (IN-truh-VEH-sih-kul)
    Pronunciation of dictionary term "intravesical"
    Within the bladder.
  intravesical chemotherapy: (IN-truh-VEH-sih-kul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intravesical chemotherapy"
    Treatment in which anticancer drugs are put directly into the bladder through a thin, flexible tube inserted into the urethra (the tube through which urine leaves the body from the bladder). Intravesical chemotherapy may be used to treat some types of early-stage bladder cancer.
  intravitreal chemotherapy: (IN-truh-VIH-tree-ul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "intravitreal chemotherapy"
    Treatment in which anticancer drugs are injected directly into the vitreous humor (gel-like fluid inside the eye). Intravitreal chemotherapy is used to treat retinoblastoma that has spread to the vitreous humor and has come back or has not gotten better after other treatment.
  Intron A: (IN-tron…)
    Pronunciation of dictionary term "Intron A"
    A drug used alone or with other drugs to treat adults with AIDS-related Kaposi sarcoma, hairy cell leukemia, certain types of follicular lymphoma or melanoma, genital warts or perianal warts, or chronic hepatitis B or C. It is also being studied in the treatment of other types of cancer and other conditions. Intron A is a form of interferon alfa (a substance normally made by cells in the immune system) that is made in the laboratory. It is a type of cytokine and a type of immunomodulating agent. Also called IFN alpha-2B, interferon alfa-2b, and recombinant interferon alfa-2b.
    More Information
    - Recombinant Interferon Alfa-2b (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-interferon-alfa-2b)
  intrusive thought: (in-TROO-siv thawt)
    Pronunciation of dictionary term "intrusive thought"
    An unpleasant memory or idea that occurs often in a person’s everyday thoughts and keeps him or her from thinking about other things. Interfering thoughts can make sleep difficult and make a person unable to carry out daily activities. Also called interfering thought.
  intubation: (IN-too-BAY-shun)
    Pronunciation of dictionary term "intubation"
    A procedure in which a tube is inserted through the mouth or nose into the trachea (windpipe) or into a hollow organ, such as the stomach. Intubation of the trachea is usually done to keep a person’s airway open so oxygen can flow into the lungs and to help a person breathe when they cannot breathe on their own. It may also be done to give medicine directly into the lungs, to keep food or fluid from getting into the lungs, or to remove blockages from the airway. Intubation of the stomach is usually done to remove air or other substances from the stomach or to give drugs or liquid foods into the stomach or small intestine.
  invasive breast cancer: (in-VAY-siv brest KAN-ser)
    Pronunciation of dictionary term "invasive breast cancer"
    Cancer that has spread from where it began in the breast to surrounding normal tissue. The most common type of invasive breast cancer is invasive ductal carcinoma, which begins in the lining of the milk ducts (thin tubes that carry milk from the lobules of the breast to the nipple). Another type is invasive lobular carcinoma, which begins in the lobules (milk glands) of the breast. Invasive breast cancer can spread through the blood and lymph systems to other parts of the body. Also called infiltrating breast cancer.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
  invasive cancer: (in-VAY-siv KAN-ser)
    Pronunciation of dictionary term "invasive cancer"
    Cancer that has spread beyond the layer of tissue in which it developed and is growing into surrounding, healthy tissues. Also called infiltrating cancer.
  invasive cervical cancer: (in-VAY-siv SER-vih-kul KAN-ser)
    Pronunciation of dictionary term "invasive cervical cancer"
    Cancer that has spread from the surface of the cervix to tissue deeper in the cervix or to other parts of the body.
  invasive ductal carcinoma: (in-VAY-siv DUK-tul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "invasive ductal carcinoma"
    The most common type of invasive breast cancer. It begins in the lining of the milk ducts (thin tubes that carry milk from the lobules of the breast to the nipple) and spreads outside the ducts to surrounding normal tissue. Invasive ductal carcinoma can also spread through the blood and lymph systems to other parts of the body. Also called infiltrating ductal carcinoma.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    Invasive ductal carcinoma (IDC) of the breast begins in the lining of a breast duct (milk duct) and spreads outside the duct to other tissues in the breast. It can also spread through the blood and lymph system to other parts of the body. IDC is the most common type of invasive breast cancer.
    Invasive ductal carcinoma (IDC) of the breast; drawing shows a lobe, ducts, and fatty tissue in a cross section of the breast. An inset shows a normal duct and a duct with IDC and cancer cells spreading outside it.
  invasive hydatidiform mole: (in-VAY-siv HY-duh-TIH-dih-form …)
    Pronunciation of dictionary term "invasive hydatidiform mole"
    A type of cancer that grows into the muscular wall of the uterus. It is formed after conception (fertilization of an egg by a sperm). It may spread to other parts of the body, such as the vagina, vulva, and lung. Also called chorioadenoma destruens.
  invasive lobular carcinoma: (in-VAY-siv LAH-byoo-ler KAR-sih-NOH-muh)
    Pronunciation of dictionary term "invasive lobular carcinoma"
    A type of invasive breast cancer that begins in the lobules (milk glands) of the breast and spreads to surrounding normal tissue. It can also spread through the blood and lymph systems to other parts of the body. Also called infiltrating lobular carcinoma.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    Invasive lobular carcinoma begins in the lobules (milk glands) of the breast and spreads outside the lobules to other tissues in the breast. It can also spread through the blood and lymph systems to other parts of the body.
    Invasive lobular carcinoma of the breast; drawing shows a lobe, ducts, lobules, and fatty tissue in a cross section of the breast. There are also three separate pullouts showing a normal lobe, a normal lobule, and a lobule with invasive lobular carcinoma and cancer cells spreading outside it.
  invasive procedure: (in-VAY-siv proh-SEE-jer)
    Pronunciation of dictionary term "invasive procedure"
    A medical procedure that invades (enters) the body, usually by cutting or puncturing the skin or by inserting instruments into the body.
  inverted nipple: (in-VER-ted NIH-pul)
    Pronunciation of dictionary term "inverted nipple"
    A nipple that turns inward into the breast or lies flat against the breast. An inverted nipple may be present at birth or may be caused by aging, breastfeeding, breast surgery, injury, infection, or certain breast conditions. It may also be a sign of breast cancer. Also called retracted nipple.
  inverted papilloma: (in-VER-ted PA-pih-LOH-muh)
    Pronunciation of dictionary term "inverted papilloma"
    A type of tumor in which surface epithelial cells grow downward into the underlying supportive tissue. It may occur in the nose and/or sinuses or in the urinary tract (bladder, renal pelvis, ureter, urethra). When it occurs in the nose or sinuses, it may cause symptoms similar to those caused by sinusitis, such as nasal congestion. When it occurs in the urinary tract, it may cause blood in the urine.
  investigational: (in-VES-tih-GAY-shuh-nul)
    Pronunciation of dictionary term "investigational"
    In clinical trials, refers to a drug (including a new drug, dose, combination, or route of administration) or procedure that has undergone basic laboratory testing and received approval from the U.S. Food and Drug Administration (FDA) to be tested in human subjects. A drug or procedure may be approved by the FDA for use in one disease or condition, but be considered investigational in other diseases or conditions. Also called experimental.
  investigational agent: (in-VES-tih-GAY-shuh-nul AY-jent)
    Pronunciation of dictionary term "investigational agent"
    A substance that has been tested in the laboratory and has been approved by the U.S. Food and Drug Administration (FDA) for testing in people. Clinical trials test how well investigational agents work and whether they are safe to use. An investigational agent may be approved by the FDA for use in one disease or condition but still be considered investigational in other diseases or conditions. Also called experimental drug, IND, investigational drug, and investigational new drug.
    More Information
    - Access to Experimental Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs/access-experimental)
  investigational drug: (in-VES-tih-GAY-shuh-nul ...)
    Pronunciation of dictionary term "investigational drug"
    A substance that has been tested in the laboratory and has been approved by the U.S. Food and Drug Administration (FDA) for testing in people. Clinical trials test how well investigational drugs work and whether they are safe to use. An investigational drug may be approved by the FDA for use in one disease or condition but still be considered investigational in other diseases or conditions. Also called experimental drug, IND, investigational agent, and investigational new drug.
    More Information
    - Access to Experimental Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs/access-experimental)
  investigational group: (in-VES-tih-GAY-shuh-nul groop)
    Pronunciation of dictionary term "investigational group"
    The group in a clinical research study that receives the drug, vaccine, or other intervention being tested. Interventions may also include medical procedures (such as radiation therapy and surgery), medical devices, behavior changes (such as diet and exercise), education programs, and counseling. Also called experimental group and intervention group.
  investigational new drug: (in-VES-tih-GAY-shuh-nul ...)
    Pronunciation of dictionary term "investigational new drug"
    A substance that has been tested in the laboratory and has been approved by the U.S. Food and Drug Administration (FDA) for testing in people. Clinical trials test how well investigational new drugs work and whether they are safe to use. An investigational new drug may be approved by the FDA for use in one disease or condition but still be considered investigational in other diseases or conditions. Also called experimental drug, IND, investigational agent, and investigational drug.
    More Information
    - Access to Experimental Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs/access-experimental)
  investigator: (in-VES-tih-gay-ter)
    Pronunciation of dictionary term "investigator"
    In research, a person who is involved in running a clinical trial or research study. The investigator may help prepare and carry out the protocol (plan) for the study, monitor the safety of the study, collect and analyze the data, and report the results of the study. Investigators can include doctors, scientists, nurses, and other research staff. Some clinical trials or research studies may have more than one investigator. Usually one of the investigators is the principal investigator, who is in charge of the whole study.
  inviable: (in-VY-uh-bul)
    Pronunciation of dictionary term "inviable"
    Not able to survive.
  involuntary: (in-VAH-lun-TAYR-ee)
    Pronunciation of dictionary term "involuntary"
    An action that is not made by choice. In the body, involuntary actions (such as blushing) occur automatically, and cannot be controlled by choice.
  involuntary nervous system: (in-VAH-lun-TAYR-ee NER-vus SIS-tem)
    Pronunciation of dictionary term "involuntary nervous system"
    The part of the nervous system that controls muscles of internal organs (such as the heart, blood vessels, lungs, stomach, and intestines) and glands (such as salivary glands and sweat glands). One part of the involuntary nervous system helps the body rest, relax, and digest food and another part helps a person fight or take flight in an emergency. Also called ANS and autonomic nervous system.
  iobenguane I 123: (I-oh-BEN-gwayn …)
    Pronunciation of dictionary term "iobenguane I 123"
    A drug containing a form of radioactive iodine called I 123 that is used to find certain types of tumors, including pheochromocytomas and neuroblastomas. Radiation from I 123 may help show where cancer cells are in the body. Iobenguane I 123 is a type of radioconjugate. Also called 123I-MIBG, AdreView, and iodine I 123-metaiodobenzylguanidine.
  iobenguane I 131: (I-oh-BEN-gwayn …)
    Pronunciation of dictionary term "iobenguane I 131"
    A drug that contains a form of radioactive iodine and is used to treat adults and children aged 12 years and older with certain types of malignant pheochromocytoma or paraganglioma that have spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Iobenguane I 131 builds up in tumor cells and gives off radiation that may kill them. It is a type of radiotherapeutic agent. Also called 131I-MIBG, Azedra, and iodine I 131-metaiodobenzylguanidine.
    More Information
    - Iobenguane I 131 (https://www.cancer.gov/about-cancer/treatment/drugs/iobenguaneI131)
  iobenguane scan: (I-oh-BEN-gwayn skan)
    Pronunciation of dictionary term "iobenguane scan"
    A procedure used to find neuroendocrine tumors, such as neuroblastomas and pheochromocytomas. A small amount of a substance called radioactive iobenguane is injected into a vein and travels through the bloodstream. Neuroendocrine tumor cells take up the radioactive iobenguane and are detected by a scanner. Also called metaiodobenzylguanidine scan and MIBG scan.
  iodine: (I-oh-dine)
    Pronunciation of dictionary term "iodine"
    An element that is necessary for the body to make thyroid hormone. It is found in shellfish and iodized salt.
  iodine I 123-metaiodobenzylguanidine: (I-oh-dine … meh-tuh-I-oh-doh-BEN-zul-GWAH-nih-deen)
    Pronunciation of dictionary term "iodine I 123 metaiodobenzylguanidine"
    A drug containing a form of radioactive iodine called I 123 that is used to find certain types of tumors, including pheochromocytomas and neuroblastomas. Radiation from I 123 may help show where cancer cells are in the body. Iodine I 123-metaiodobenzylguanidine is a type of radioconjugate. Also called 123I-MIBG, AdreView, and iobenguane I 123.
  iodine I 131-ethiodized oil: (I-oh-dine … eh-THY-oh-dized oyl)
    Pronunciation of dictionary term "iodine I 131 ethiodized oil"
    A radioactive substance being studied in the treatment of liver cancer. It is a form of poppy seed oil that contains iodine, some of which is the radioactive substance iodine I 131. Iodine I 131-ethiodized oil builds up in the blood and lymph vessels in the liver and may kill cancer cells. Also called iodine I 131-Lipiodol.
  iodine I 131-Lipiodol: (I-oh-dine … LIH-pee-oh-dol)
    Pronunciation of dictionary term "iodine I 131 Lipiodol"
    A radioactive substance being studied in the treatment of liver cancer. It is a form of poppy seed oil that contains iodine, some of which is the radioactive substance iodine I 131. Iodine I 131-Lipiodol builds up in the blood and lymph vessels in the liver and may kill cancer cells. Also called iodine I 131-ethiodized oil.
  iodine I 131-metaiodobenzylguanidine: (I-oh-dine ... meh-tuh-I-oh-doh-BEN-zul-GWAH-nih-deen)
    Pronunciation of dictionary term "iodine I 131 metaiodobenzylguanidine"
    A drug that contains a form of radioactive iodine and is used to treat adults and children aged 12 years and older with certain types of malignant pheochromocytoma or paraganglioma that have spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Iodine I 131-metaiodobenzylguanidine builds up in tumor cells and gives off radiation that may kill them. It is a type of radiotherapeutic agent. Also called 131I-MIBG, Azedra, and iobenguane I 131.
    More Information
    - Iobenguane I 131 (https://www.cancer.gov/about-cancer/treatment/drugs/iobenguaneI131)
  iodine I 131-monoclonal antibody BC8: (I-oh-dine … MAH-noh-KLOH-nul AN-tee-BAH-dee…)
    Pronunciation of dictionary term "iodine I 131 monoclonal antibody BC8"
    A substance being studied in the treatment of some types of leukemia and lymphoma. BC8 is a monoclonal antibody that binds to a protein called CD45, which is found on most white blood cells and some types of leukemia and lymphoma cells. It is linked to a radioactive substance called iodine I 131, which may help kill cancer cells. Iodine I 131-monoclonal antibody BC8 is a type of radioimmunoconjugate.
  iodine I 131-tositumomab: (I-oh-dine ... TAH-sih-TOO-moh-mab)
    Pronunciation of dictionary term "iodine I 131 tositumomab"
    A drug used with another drug to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Iodine I 131-tositumomab is a form of the monoclonal antibody tositumomab that is linked to the radioactive substance iodine I 131. It is a type of radioimmunoconjugate.
  iodized oil: (I-oh-dized oyl)
    Pronunciation of dictionary term "iodized oil"
    A form of poppy seed oil that contains iodine. Iodized oil is given by injection and builds up in the blood and lymph vessels in tumors. It is used for imaging (taking pictures) of the salivary glands and the lymph system. It is also being studied in the imaging of other organs such as the liver, lung, stomach, and thyroid. It is a type of diagnostic imaging agent. Also called ethiodized oil, Ethiodol, and Lipiodol.
  iododoxorubicin: (I-oh-doh-DOK-soh-ROO-bih-sin)
    Pronunciation of dictionary term "iododoxorubicin"
    A substance that is being studied as a treatment for cancer and for primary systemic amyloidosis (a disease in which proteins are deposited in specific organs). It is a type of anthracycline antitumor antibiotic.
  ion: (I-on)
    Pronunciation of dictionary term "ion"
    An atom or a molecule that has a positive or negative electrical charge. Examples are sodium, potassium, calcium, chloride, and phosphate. These ions help move nutrients into cells, help move waste out of cells, and help nerves, muscles, the heart, and the brain work the way they should.
  ionizing radiation: (I-uh-NY-zing RAY-dee-AY-shun)
    Pronunciation of dictionary term "ionizing radiation"
    A type of high-energy radiation that has enough energy to remove an electron (negative particle) from an atom or molecule, causing it to become ionized. Ionizing radiation can cause chemical changes in cells and damage DNA. This may increase the risk of developing certain health conditions, such as cancer. Ionizing radiation can come from natural sources, such as radon and cosmic rays (rays that enter the earth's atmosphere from outer space). It may also come from medical imaging equipment, such as x-ray, CT scan, or PET scan machines. Nuclear power plant accidents and atomic weapons also release high levels of ionizing radiation. Being exposed to very high doses of ionizing radiation can cause immediate damage to a person’s body, including severe skin or tissue damage, acute radiation sickness, and death.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  ionomycin: (I-on-oh-MY-sin)
    Pronunciation of dictionary term "ionomycin"
    An antibiotic drug used to treat infection.
  IORT: Radiation treatment aimed directly at a tumor during surgery. Also called intraoperative radiation therapy.
  IOUS: A procedure that uses ultrasound (high-energy sound waves that are bounced off internal tissues and organs) during surgery. Sonograms (pictures made by ultrasound) of the inside of the body are viewed on a computer to help a surgeon find tumors or other problems during the operation. Also called intraoperative ultrasound.
  IP: Within the peritoneal cavity (the area that contains the abdominal organs). Also called intraperitoneal.
  IP6: A substance found in many foods that come from plants, including corn, wheat, rice, and soybeans, and in large amounts in cereals and legumes. It is being studied in the prevention of cancer. Also called inositol hexaphosphate and phytic acid.
  ipilimumab: (ih-pih-LIH-myoo-mab)
    Pronunciation of dictionary term "ipilimumab"
    A drug that binds to the protein CTLA-4 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that have certain mutations (changes) in genes involved in DNA repair. Ipilimumab is used alone or with other drugs to treat certain types of colorectal cancer, esophageal cancer, hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, melanoma, non-small cell lung cancer, and renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. Ipilimumab may block CTLA-4 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called MDX-010 and Yervoy.
    More Information
    - Ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
  ipsilateral: (IP-sih-LA-teh-rul)
    Pronunciation of dictionary term "ipsilateral"
    On the same side of the body as another structure or a given point.
  iq’mik: (IK-mik)
    Pronunciation of dictionary term "iq’mik"
    A type of smokeless tobacco that is made by mixing cured tobacco leaves with ashes from a certain type of fungus. It is used mainly in Alaska and is chewed. It contains nicotine and many harmful, cancer-causing chemicals. Using iq’mik can lead to nicotine addiction and can cause cancer of the mouth and other health problems.
  IRB: A group of scientists, doctors, clergy, and patient advocates that reviews and approves the detailed plan for a clinical trial. IRBs are meant to protect the people who take part in a clinical trial. They check to see that the trial is well designed, legal, ethical, does not involve unneeded risks, and includes a safety plan for patients. There is an IRB at every health care facility that does clinical research, and every trial is reviewed by an IRB before the trial begins. Also called Institutional Review Board.
  Iressa: (i-REH-suh)
    Pronunciation of dictionary term "Iressa"
    A drug used to treat non-small cell lung cancer that has spread to other parts of the body and has certain mutations (changes) in the EGFR gene. It is used in patients whose cancer has not already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Iressa blocks certain proteins made by the EGFR gene, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Iressa is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called gefitinib and ZD1839.
    More Information
    - Gefitinib (https://www.cancer.gov/about-cancer/treatment/drugs/gefitinib)
  irinotecan: (I-rih-noh-TEE-kan)
    Pronunciation of dictionary term "irinotecan"
    The active ingredient in a drug used alone or with other drugs to treat colon cancer or rectal cancer that has spread to other parts of the body or has come back after treatment with fluorouracil. It is also being studied in the treatment of other types of cancer. Irinotecan blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog.
  irinotecan hydrochloride: (I-rih-noh-TEE-kan HY-droh-KLOR-ide)
    Pronunciation of dictionary term "irinotecan hydrochloride"
    A drug used alone or with other drugs to treat colorectal cancer that has spread to other parts of the body. It is used in patients whose cancer has not already been treated or whose cancer has recurred (come back) or has gotten worse after treatment with anticancer drugs that included fluorouracil. It is also being studied in the treatment of other types of cancer. Irinotecan hydrochloride blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Irinotecan is the active ingredient of irinotecan hydrochloride. Also called Camptosar and CPT 11.
    More Information
    - Irinotecan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
  irinotecan sucrosofate: (I-rih-noh-TEE-kan soo-KROH-soh-fayt)
    Pronunciation of dictionary term "irinotecan sucrosofate"
    A form of the anticancer drug irinotecan hydrochloride that is contained inside very tiny, fat-like particles and is used with other drugs to treat adults with pancreatic cancer that has spread to other parts of the body. It is used in patients whose cancer has not been treated with other anticancer therapy or has gotten worse after treatment with gemcitabine hydrochloride. It is also being studied in the treatment of other types of cancer. Irinotecan sucrosofate may have fewer side effects and work better than other forms of irinotecan hydrochloride. Irinotecan sucrosofate blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called Onivyde and PEP02.
    More Information
    - Irinotecan Sucrosofate (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecan-hydrochloride-liposome)
  iris: (I-ris)
    Pronunciation of dictionary term "iris"
    The colored tissue at the front of the eye that contains the pupil in the center. The iris helps control the size of the pupil to let more or less light into the eye.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  irofulven: (i-roh-FUL-ven)
    Pronunciation of dictionary term "irofulven"
    A substance being studied in the treatment of some types of cancer. Irofulven attaches to the cell's DNA and may block cancer cell growth. It is a type of alkylating agent. Also called 6-hydroxymethylacylfulvene.
  iron: (I-urn)
    Pronunciation of dictionary term "iron"
    An important mineral the body needs to make hemoglobin, a substance in the blood that carries oxygen from the lungs to tissues throughout the body. Iron is also an important part of many other proteins and enzymes needed by the body for normal growth and development. It is found in red meat, fish, poultry, lentils, beans, and foods with iron added, such as cereal.
  iron overload: (I-urn OH-ver-lode)
    Pronunciation of dictionary term "iron overload"
    A condition in which the body takes up and stores more iron than it needs. The extra iron is stored in the liver, heart, and pancreas, which may cause liver disease, heart problems, organ failure, and cancer. It may also cause bronze skin, diabetes, pain in the joints and abdomen, tiredness, and impotence. Iron overload may be inherited, or it may be caused by blood transfusions. Also called hemochromatosis.
    More Information
    - Hemochromatosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10746/hemochromatosis)
    - Hemochromatosis (MedlinePlus) (https://medlineplus.gov/ency/article/000327.htm)
  irradiated: (ih-RAY-dee-AY-ted)
    Pronunciation of dictionary term "irradiated"
    Treated with radiation.
  irradiation: (ih-RAY-dee-AY-shun)
    Pronunciation of dictionary term "irradiation"
    The use of high-energy radiation from x-rays, gamma rays, neutrons, protons, and other sources to kill cancer cells and shrink tumors. Radiation may come from a machine outside the body (external-beam radiation therapy), or it may come from radioactive material placed in the body near cancer cells (internal radiation therapy or brachytherapy). Systemic irradiation uses a radioactive substance, such as a radiolabeled monoclonal antibody, that travels in the blood to tissues throughout the body. Also called radiation therapy and radiotherapy.
    More Information
    - Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy)
    - Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
  irreversible enzyme inhibitor: (eer-ree-VER-sih-bul EN-zime in-HIH-bih-ter)
    Pronunciation of dictionary term "irreversible enzyme inhibitor"
    A substance that permanently blocks the action of an enzyme. In cancer treatment, irreversible enzyme inhibitors may block certain enzymes that cancer cells need to grow and may kill cancer cells. They are being studied in the treatment of some types of cancer.
  irreversible toxicity: (eer-ree-VER-sih-bul tok-SIH-sih-tee)
    Pronunciation of dictionary term "irreversible toxicity"
    Side effects that are caused by toxic substances or something harmful to the body and do not go away.
  irrigation: (EER-ih-GAY-shun)
    Pronunciation of dictionary term "irrigation"
    In medicine, washing out an organ (such as the stomach or colon), a body cavity, or a wound by flushing it with a fluid. Also called lavage.
  irritable bowel syndrome: (EER-ih-tuh-bul BOW-ul SIN-drome)
    Pronunciation of dictionary term "irritable bowel syndrome"
    A disorder of the intestines commonly marked by abdominal pain, bloating, and changes in a person’s bowel habits. This may include diarrhea or constipation, or both, with one occurring after the other. Also called IBS, irritable colon, mucus colitis, and spastic colon.
  irritable colon: (EER-ih-tuh-bul KOH-lun)
    Pronunciation of dictionary term "irritable colon"
    A disorder of the intestines commonly marked by abdominal pain, bloating, and changes in a person’s bowel habits. This may include diarrhea or constipation, or both, with one occurring after the other. Also called IBS, irritable bowel syndrome, mucus colitis, and spastic colon.
  Isaac syndrome: (I-zik SIN-drome)
    Pronunciation of dictionary term "Isaac syndrome"
    A rare nerve disorder that causes constant muscle activity that cannot be controlled, even during sleep. It often affects the muscles in the arms and legs, but may affect the whole body. Symptoms include muscle twitching, weakness, stiffness, and cramping; increased skin temperature, sweating, and heart rate; and problems with chewing, swallowing, speech, and breathing. The disorder often gets worse over time. Isaac syndrome usually occurs in people aged 15 to 60 years. It may occur with certain types of cancer and is sometimes inherited. Also called neuromyotonia.
    More Information
    - Isaacs' syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6793/isaac-syndrome)
  isatuximab: (I-suh-TUK-sih-mab)
    Pronunciation of dictionary term "isatuximab"
    A drug used with other drugs to treat adults with certain types of multiple myeloma. It is also being studied in the treatment of other types of cancer. Isatuximab binds to a protein called CD38, which is found on some types of immune cells and cancer cells, including myeloma cells. Isatuximab may block CD38 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Sarclisa.
    More Information
    - Isatuximab-irfc (https://www.cancer.gov/about-cancer/treatment/drugs/isatuximab-irfc)
  ischemia: (is-KEE-mee-uh)
    Pronunciation of dictionary term "ischemia"
    Lack of blood supply to a part of the body. Ischemia may cause tissue damage due to the lack of oxygen and nutrients.
  ischemic necrosis: (is-KEE-mik neh-KROH-sis)
    Pronunciation of dictionary term "ischemic necrosis"
    A condition in which there is a loss of blood flow to bone tissue, which causes the bone to die. It is most common in the hips, knees, shoulders, and ankles. It may be caused by long-term use of steroid medicines, alcohol abuse, joint injuries, and certain diseases, such as cancer and arthritis. It may also occur at some point in time after cancer treatment that included methotrexate, bisphosphonates, or corticosteroids. Also called aseptic necrosis, avascular necrosis, and osteonecrosis.
  iseganan hydrochloride: (i-seh-GAN-an HY-droh-KLOR-ide)
    Pronunciation of dictionary term "iseganan hydrochloride"
    A substance being studied in the treatment of oral mucositis (painful mouth sores) caused by cancer therapy and other conditions. Iseganan hydrochloride kills certain bacteria, fungi, and viruses by making holes in their outer membranes and causing them to burst. It is a type of synthetic antimicrobial peptide and a type of synthetic protegrin analog.
  ISIS 2503: A substance that is being studied in the treatment of cancer.
  ISIS 3521: A substance that is being studied in the treatment of cancer.
  ISIS 5132: A substance that is being studied in the treatment of cancer.
  islet cell: (I-let sel)
    Pronunciation of dictionary term "islet cell"
    A pancreatic cell that produces hormones (e.g., insulin and glucagon) that are secreted into the bloodstream. These hormones help control the level of glucose (sugar) in the blood. Also called endocrine pancreas cell and islet of Langerhans cell.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  islet cell carcinoma: (I-let sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "islet cell carcinoma"
    A rare cancer that forms in islet cells (hormone-making cells) of the pancreas. Islet cells make several different hormones that affect body functions, including controlling the amount of glucose (sugar) in the blood and helping digest food in the stomach. Functional islet cell carcinomas make extra amounts of these hormones, which can cause symptoms. Nonfunctional islet cell carcinomas do not make extra amounts of hormones, but they may cause symptoms as they grow and spread. Also called pancreatic endocrine cancer.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  islet cell tumor: (I-let sel TOO-mer)
    Pronunciation of dictionary term "islet cell tumor"
    A tumor that forms in islet cells (hormone-making cells) of the pancreas. Islet cell tumors may be benign (not cancer) or malignant (cancer). Islet cells make several different hormones that affect body functions, including controlling the amount of glucose (sugar) in the blood and helping digest food in the stomach. Functional islet cell tumors make extra amounts of these hormones, which can cause symptoms. Nonfunctional islet cell tumors do not make extra amounts of hormones, but they may cause symptoms as they grow and spread. Also called pancreatic endocrine tumor and pancreatic neuroendocrine tumor.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  islet of Langerhans cell: (I-let … LANG-er-hanz sel)
    Pronunciation of dictionary term "islet of Langerhans cell"
    A pancreatic cell that produces hormones (e.g., insulin and glucagon) that are secreted into the bloodstream. These hormones help control the level of glucose (sugar) in the blood. Also called endocrine pancreas cell and islet cell.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  isocitrate dehydrogenase-1 gene: (I-soh-SIH-trayt dee-hy-DRAH-jeh-nays … jeen)
    Pronunciation of dictionary term "isocitrate dehydrogenase-1 gene"
    A gene that makes a protein that helps break down fats for energy and protect cells from harmful molecules. Mutations (changes) in the isocitrate dehydrogenase-1 gene have been found in several genetic conditions and in some types of cancer, including acute myelogenous leukemia, myelodysplastic syndromes, and brain cancer. These changes may cause abnormal cells, including cancer cells, to grow and spread in the body. Also called IDH1 gene.
  isocitrate dehydrogenase-2 gene: (I-soh-SIH-trayt dee-hy-DRAH-jeh-nays … jeen)
    Pronunciation of dictionary term "isocitrate dehydrogenase-2 gene"
    A gene that makes a protein that is found inside small structures in cells called mitochondria and that helps the mitochondria make energy for many cell functions. Mutations (changes) in the isocitrate dehydrogenase-2 gene have been found in certain genetic conditions and in some types of cancer, including acute myelogenous leukemia and brain cancer. These changes may cause abnormal cells, including cancer cells, to grow and spread in the body. Also called IDH2 gene.
  isoflavone: (I-soh-FLAY-vone)
    Pronunciation of dictionary term "isoflavone"
    An estrogen-like substance made by some plants, including the soy plant. Soy isoflavones are being studied in the prevention of cancer, hot flashes that occur with menopause, and osteoporosis (loss of bone density).
  isointense: (I-soh-in-tents)
    Pronunciation of dictionary term "isointense"
    Having the same intensity as another object. Used to describe the results of imaging tests, such as x-rays, MRIs, or CT scans.
  isolated hepatic perfusion: (I-soh-LAY-ted heh-PA-tik per-FYOO-zhun)
    Pronunciation of dictionary term "isolated hepatic perfusion"
    A procedure in which a catheter is placed into the artery that provides blood to the liver. A second catheter is placed into the vein that takes blood away from the liver. This temporarily separates the liver's blood supply from blood circulating throughout the rest of the body and allows high doses of anticancer drugs to be directed to the liver only.
  isolated limb infusion: (I-soh-LAY-ted LIM in-FYOO-zhun)
    Pronunciation of dictionary term "isolated limb infusion"
    A procedure used to deliver anticancer drugs directly to an arm or leg but not to the rest of the body. The flow of blood to and from the limb is temporarily stopped with a tourniquet (a tight band around the limb). Catheters (small, flexible tubes) attached to a pump are put into an artery and a vein in the limb so that blood can be circulated through the pump into the limb. Anticancer drugs are injected into the catheters. Wrapping the limb in a heated blanket or warming the drugs or blood may help the drugs work better.
  isolated limb perfusion: (I-soh-LAY-ted LIM per-FYOO-zhun)
    Pronunciation of dictionary term "isolated limb perfusion"
    A procedure that may be used to deliver anticancer drugs directly to an arm or leg. The flow of blood to and from the limb is temporarily stopped with a tourniquet (a tight band around the limb), and anticancer drugs are put directly into the blood of the limb. This allows the person to receive a high dose of drugs in the area where the cancer occurred. Also called limb perfusion.
  isolated lung perfusion: (I-soh-LAY-ted ... per-FYOO-zhun)
    Pronunciation of dictionary term "isolated lung perfusion"
    A surgical procedure during which the circulation of blood to the lungs is separated from the circulation of blood through the rest of the body, and a drug is delivered directly into the lung circulation. This allows a higher concentration of chemotherapy to reach tumors in the lungs.
  isolation: (I-soh-LAY-shun)
    Pronunciation of dictionary term "isolation"
    State of being separated from others. Isolation is sometimes used to prevent disease from spreading.
  isomer: (I-soh-mer)
    Pronunciation of dictionary term "isomer"
    One of two or more compounds that have the same chemical formula but different arrangements of the atoms within the molecules and that may have different physical/chemical properties.
  isosulfan blue: (I-soh-SUL-fan …)
    Pronunciation of dictionary term "isosulfan blue"
    A dye made in the laboratory that helps identify the sentinel lymph node (the first lymph node that cancer spreads to from a primary tumor). Isosulfan blue is injected at the edge of a tumor and travels through the lymph fluid to lymph nodes near the tumor. The sentinel lymph node is identified by removing lymph nodes that are stained with the blue dye and looking for cancer cells under a microscope.
  isotope: (I-soh-tope)
    Pronunciation of dictionary term "isotope"
    A form of a chemical element in which the atoms have the same number of protons (part of the nucleus of an atom) but with a different number of neutrons (part of the nucleus of an atom). For example, carbon 12, carbon 13, and carbon 14 are isotopes of carbon. They all have six protons in the nucleus, but each has different number of neutrons. Isotopes may be used in certain medical tests and procedures.
  isotretinoin: (I-soh-TREH-tih-noyn)
    Pronunciation of dictionary term "isotretinoin"
    A drug closely related to vitamin A that is used to treat severe acne and may also be used to treat other skin conditions and some types of cancer, including neuroblastoma. It is also being studied in the prevention and treatment of other types of cancer. Isotretinoin binds to and activates certain protein receptors in cells, including cancer cells. This may slow the growth of cancer cells and change how these cells look and act. Isotretinoin is a type of retinoid. Also called 13-cis retinoic acid.
  ispinesib: (is-PIN-eh-sib)
    Pronunciation of dictionary term "ispinesib"
    A substance being studied in the treatment of cancer. Ispinesib blocks a protein that tumor cells need to divide. It is a type of mitotic inhibitor. Also called SB-715992.
  isthmus: (iz-muhs)
    Pronunciation of dictionary term "isthmus"
    A narrow part inside the body that connects two larger structures.
  Istodax: (IH-stoh-dax)
    Pronunciation of dictionary term "Istodax"
    A drug used to treat adults with cutaneous T-cell lymphoma that has already been treated with at least one other type of systemic therapy. It is also being studied in the treatment of other types of cancer. Istodax blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of depsipeptide and a type of histone deacetylase inhibitor. Also called FR901228 and romidepsin.
    More Information
    - Romidepsin (https://www.cancer.gov/about-cancer/treatment/drugs/romidepsin)
  ITD: A type of genetic change in which a DNA sequence in a gene is copied and inserted right after the original DNA sequence. This changes the sequence of the gene, which can affect the function of the protein made from the gene. ITDs are associated with certain types of cancer, such as acute myeloid leukemia. Also called internal tandem duplication.
  Itovebi: (i-TOV-bee)
    Pronunciation of dictionary term "Itovebi"
    A drug used with palbociclib and fulvestrant to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer that has a mutation (change) in the PIK3CA gene. It is also being studied in the treatment of other types of cancer. Itovebi works by blocking the activity of a protein called PI3K-alpha that signals cancer cells to multiply. It also helps break down mutant versions of this protein found in some cancer cells. This may keep cancer cells from growing and may kill them. Itovebi is a type of targeted therapy drug called an enzyme inhibitor. Also called inavolisib.
    More Information
    - Inavolisib (https://www.cancer.gov/about-cancer/treatment/drugs/inavolisib)
  ITP: A condition in which platelets (blood cells that cause blood clots to form) are destroyed by the immune system. The low platelet count causes easy bruising and bleeding, which may be seen as purple areas in the skin, mucous membranes, and outer linings of organs. Also called idiopathic thrombocytopenic purpura, immune thrombocytopenia, and immune thrombocytopenic purpura.
  itraconazole: (IH-truh-KAH-nuh-zole)
    Pronunciation of dictionary term "itraconazole"
    A drug used to prevent or treat fungal infections. It belongs to the family of drugs called antifungal agents.
  IU: A unit used to measure the activity of many vitamins, hormones, enzymes, and drugs. An IU is the amount of a substance that has a certain biological effect. For each substance there is an international agreement on the biological effect that is expected for 1 IU. Also called International Unit.
  IUD: A small, plastic T-shaped device that is placed inside the uterus (the small, hollow, pear-shaped organ in a woman’s pelvis in which a fetus develops) to prevent pregnancy. IUDs prevent sperm from fertilizing an egg, and prevent fertilized eggs from implanting in the uterus. The use of IUDs is also being studied in the prevention and treatment of endometrial cancer and other conditions. Also called intrauterine device.
  IV: Into or within a vein. IV usually refers to a way of giving a drug or other substance through a needle or tube inserted into a vein. Also called intravenous.
  IVF: A procedure in which eggs are removed from a woman’s ovary and combined with sperm outside the body to form embryos. The embryos are grown in the laboratory for several days and then either placed in a woman’s uterus or cryopreserved (frozen) for future use. Also called in vitro fertilization.
  IVIG: A substance made from antibodies that have been taken from the blood of many healthy donors. It is given to a patient through a needle or tube inserted into a vein. IVIGs are used to treat certain types of immune disorders in which there are low amounts of antibodies in the blood. They are also used to treat many different autoimmune disorders, infections, or other conditions. They may also be used to help prevent infections in patients who have had a stem cell or organ transplant. IVIGs are a type of immunotherapy. Also called intravenous immunoglobulin.
  ivosidenib: (I-voh-SIH-deh-nib)
    Pronunciation of dictionary term "ivosidenib"
    A drug used alone or with other drugs to treat adults with certain types of acute myeloid leukemia, cholangiocarcinoma (a type of bile duct cancer), or myelodysplastic syndromes that have a mutation (change) in the IDH1 gene. It is also being studied in the treatment of other types of cancer. Ivosidenib blocks the protein made by the mutated IDH1 gene, which may help keep cancer cells from growing. It is a type of enzyme inhibitor and a type of targeted therapy. Also called Tibsovo.
    More Information
    - Ivosidenib (https://www.cancer.gov/about-cancer/treatment/drugs/ivosidenib)
  IVP: An x-ray image of the kidneys, ureters, and bladder, and prostate in men, that is taken after a contrast dye is injected into a vein. As the dye travels through the bloodstream, it collects in these organs, turning them bright white. This allows the health care provider to see blockages or other urinary tract problems on the x-ray pictures. An IVP may be used to help diagnose certain urinary tract conditions, such as kidney or bladder stones, kidney cysts, urinary tract tumors, and an enlarged prostate. Also called intravenous pyelogram, intravenous urogram, and IVU.
  IVU: An x-ray image of the kidneys, ureters, and bladder, and prostate in men, that is taken after a contrast dye is injected into a vein. As the dye travels through the bloodstream, it collects in these organs, turning them bright white. This allows the health care provider to see blockages or other urinary tract problems on the x-ray pictures. An IVU may be used to help diagnose certain urinary tract conditions, such as kidney or bladder stones, kidney cysts, urinary tract tumors, and an enlarged prostate. Also called intravenous pyelogram, intravenous urogram, and IVP.
  Iwilfin: (i-WILL-fin)
    Pronunciation of dictionary term "Iwilfin"
    A drug used to reduce the risk of relapse in adults and children with high-risk neuroblastoma that has gotten better after treatment with certain prior therapies. It is also being studied in the treatment of other conditions and types of cancer. Iwilfin blocks an enzyme called ornithine decarboxylase, which may help keep cancer cells from growing. It is a type of enzyme inhibitor. Also called eflornithine hydrochloride.
    More Information
    - Eflornithine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/eflornithine-hydrochloride)
  ixabepilone: (IK-suh-BEH-pih-lone)
    Pronunciation of dictionary term "ixabepilone"
    A drug used alone or with capecitabine to treat breast cancer that is locally advanced or has spread to other parts of the body and did not get better after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Ixabepilone blocks cell growth by stopping cell division and may kill cancer cells. It is a type of epothilone analog and a type of antimicrotubule agent. Also called BMS-247550 and Ixempra.
    More Information
    - Ixabepilone (https://www.cancer.gov/about-cancer/treatment/drugs/ixabepilone)
  ixazomib citrate: (ik-SA-zoh-mib SIH-trayt)
    Pronunciation of dictionary term "ixazomib citrate"
    A drug used with lenalidomide and dexamethasone to treat multiple myeloma. It is used in patients who received at least one other anticancer treatment. It is also being studied in the treatment of other types of cancer. Ixazomib citrate blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called Ninlaro.
    More Information
    - Ixazomib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/ixazomibcitrate)
  Ixempra: (ik-SEM-pruh)
    Pronunciation of dictionary term "Ixempra"
    A drug used alone or with capecitabine to treat breast cancer that is locally advanced or has spread to other parts of the body and did not get better after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Ixempra blocks cell growth by stopping cell division and may kill cancer cells. It is a type of epothilone analog and a type of antimicrotubule agent. Also called BMS-247550 and ixabepilone.
    More Information
    - Ixabepilone (https://www.cancer.gov/about-cancer/treatment/drugs/ixabepilone)
  J-107088: A substance being studied in the treatment of cancer. It is a type of topoisomerase I inhibitor. Also called edotecarin.
  J-pouch coloanal anastomosis: (... powch KOH-loh-AY-nul uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "J-pouch coloanal anastomosis"
    A surgical procedure in which the colon is attached to the anus after the rectum has been removed. A 2-4 inch section of the colon is formed into a J-shaped pouch in order to replace the function of the rectum and store stool until it can be eliminated. This procedure is similar to the side-to-end coloanal anastomosis but a larger pouch is formed.
  J-pouch colorectal anastomosis: (… powch KOH-loh-REK-tul uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "J-pouch colorectal anastomosis"
    A surgical procedure in which the colon is attached to the remainder of the rectum after most of it has been removed during surgery for rectal cancer. A 2-inch to 4-inch section of the colon is formed into a J-shaped pouch to store stool until it can be eliminated.
  JAK inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "JAK inhibitor"
    A substance that blocks the action of enzymes called Janus-associated kinases (JAK1, JAK2, JAK3, and TYK2), which help control cell signaling and growth, the number of blood cells and platelets that are made in the bone marrow, inflammation, and immune cell activity. Blocking these enzymes may help keep abnormal blood cells or cancer cells from growing. It may also reduce inflammation. Some JAK inhibitors are used to treat cancer. They are a type of targeted therapy. Also called Janus kinase inhibitor.
  JAK2 gene: (… jeen)
    Pronunciation of dictionary term "JAK2 gene"
    A gene that makes a protein that sends signals in cells to promote cell growth and helps control the number of red blood cells, white blood cells, and platelets that are made in the bone marrow. Mutated (changed) forms of the JAK gene have been found in some types of blood conditions, including polycythemia vera, essential thrombocythemia, and primary myelofibrosis. These changes may cause the body to make too many blood cells.
  Jakafi: (JA-kah-fy)
    Pronunciation of dictionary term "Jakafi"
    A drug used to treat adults with certain types of primary myelofibrosis (MF), post-polycythemia vera MF, post-essential thrombocythemia MF, or polycythemia vera, and adults and children aged 12 years and older with acute or chronic graft-versus-host disease. It is also being studied in the treatment of some types of cancer. Jakafi blocks a protein called JAK, which may help keep abnormal blood cells or cancer cells from growing. It may also lower the body’s immune response. Jakafi is a type of tyrosine kinase inhibitor. Also called ruxolitinib phosphate.
    More Information
    - Ruxolitinib Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/ruxolitinibphosphate)
  Jamshidi needle: (jam-SHEE-dee NEE-dul)
    Pronunciation of dictionary term "Jamshidi needle"
    A long, hollow needle with a tapered cutting edge on one end and a handle with a place to attach a syringe on the other end. It is used to remove a sample of tissue from the bone marrow. The needle is inserted through the bone into the bone marrow and the syringe is attached to the top to remove the sample or to deliver drugs or fluid into the bone. A Jamshidi needle is a type of bone marrow needle.
    Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
    Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
  Janus kinase inhibitor: (JAY-nus KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "Janus kinase inhibitor"
    A substance that blocks the action of enzymes called Janus-associated kinases (JAK1, JAK2, JAK3, and TYK2), which help control cell signaling and growth, the number of blood cells and platelets that are made in the bone marrow, inflammation, and immune cell activity. Blocking these enzymes may help keep abnormal blood cells or cancer cells from growing. It may also reduce inflammation. Some Janus kinase inhibitors are used to treat cancer. They are a type of targeted therapy. Also called JAK inhibitor.
  jaundice: (JAWN-dis)
    Pronunciation of dictionary term "jaundice"
    A condition in which the skin and the whites of the eyes become yellow, urine darkens, and the color of stool becomes lighter than normal. Jaundice occurs when the liver is not working properly or when a bile duct is blocked.
  Javlor: (JAV-lor)
    Pronunciation of dictionary term "Javlor"
    A substance being studied in the treatment of bladder cancer, lung cancer, and other types of cancer. Also called vinflunine.
  Jaypirca: (jay-PIR-kuh)
    Pronunciation of dictionary term "Jaypirca"
    A drug used to treat adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, or mantle cell lymphoma that was treated with at least two other types of therapy, including a BTK inhibitor. It is also being studied in the treatment of other types of cancer. Jaypirca blocks a protein called BTK, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called pirtobrutinib.
    More Information
    - Pirtobrutinib (https://www.cancer.gov/about-cancer/treatment/drugs/pirtobrutinib)
  JEB: An abbreviation for a chemotherapy combination used to treat childhood ovarian and testicular germ cell cancers that have spread. It includes the drugs carboplatin (JM8), etoposide phosphate, and bleomycin sulfate. Also called JEB regimen.
    More Information
    - JEB (https://www.cancer.gov/about-cancer/treatment/drugs/JEB)
  JEB regimen: (… REH-jih-men)
    Pronunciation of dictionary term "JEB regimen"
    An abbreviation for a chemotherapy combination used to treat childhood ovarian and testicular germ cell cancers that have spread. It includes the drugs carboplatin (JM8), etoposide phosphate, and bleomycin sulfate. Also called JEB.
    More Information
    - JEB (https://www.cancer.gov/about-cancer/treatment/drugs/JEB)
  jejunostomy: (JEH-joo-NOS-toh-mee)
    Pronunciation of dictionary term "jejunostomy"
    Surgery to create an opening into the jejunum (part of the small intestine) from the outside of the body. A jejunostomy allows a feeding tube to be put into the small intestine.
  jejunum: (jeh-JYOO-num)
    Pronunciation of dictionary term "jejunum"
    The middle part of the small intestine. It is between the duodenum (first part of the small intestine) and the ileum (last part of the small intestine). The jejunum helps to further digest food coming from the stomach. It absorbs nutrients (vitamins, minerals, carbohydrates, fats, proteins) and water from food so they can be used by the body.
    The small intestine is a long tube-like organ that connects the stomach to the large intestine. The small intestine includes the duodenum, jejunum, and ileum.
    Drawing of the small intestine showing the duodenum, jejunum, and ileum. Also shown are the stomach, appendix, large intestine, and rectum.
  Jelmyto: (jel-MY-toh)
    Pronunciation of dictionary term "Jelmyto"
    A drug that contains the active ingredient mitomycin, which comes from the bacterium Streptomyces, and is used to treat adults with a certain type of urothelial cancer. It is given as a solution through a catheter that is placed into the ureter or kidney. Jelmyto damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic and a type of alkylating agent.
    More Information
    - Mitomycin (https://www.cancer.gov/about-cancer/treatment/drugs/mitomycin)
  Jemperli: (jem-PER-lee)
    Pronunciation of dictionary term "Jemperli"
    A drug used alone or with other drugs to treat adults with certain types of endometrial cancer or other solid tumors that have come back or are advanced. These include cancers that have certain mutations (changes) in genes involved in DNA repair. It is also being studied in the treatment of other types of cancer. Jemperli binds to a protein called PD-1, which is found on T cells (a type of immune cell). Jemperli may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called dostarlimab.
    More Information
    - Dostarlimab-gxly (https://www.cancer.gov/about-cancer/treatment/drugs/dostarlimab-gxly)
  Jevtana: (jev-TA-nuh)
    Pronunciation of dictionary term "Jevtana"
    A drug used with prednisone to treat prostate cancer that has spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). It is used in patients who have already been treated with anticancer drugs that included docetaxel. It is also being studied in the treatment of other types of cancer. Jevtana stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called cabazitaxel and taxoid XRP6258.
    More Information
    - Cabazitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/cabazitaxel)
  Jewett staging system: (JOO-et STAY-jing SIS-tem)
    Pronunciation of dictionary term "Jewett staging system"
    A staging system for prostate cancer that uses ABCD. “A” and “B” refer to cancer that is confined to the prostate. “C” refers to cancer that has grown out of the prostate but has not spread to lymph nodes or other places in the body. “D” refers to cancer that has spread to lymph nodes or to other places in the body. Also called ABCD rating and Whitmore-Jewett staging system.
  jiang huang: (jyong hwong)
    Pronunciation of dictionary term "jiang huang"
    An East Indian plant that is a member of the ginger family and is used as a spice and food color. It is a major ingredient found in curry powder. The underground stem of the jiang huang plant has been used for many years in traditional Asian medicine to treat certain conditions. The substance in jiang huang that gives it a yellow color is called curcumin, which may have antioxidant and anti-inflammatory effects in the body. Jiang huang can be made into a capsule, tablet, extract, powder, or tea and taken by mouth as a dietary supplement. It can also be made into a paste to treat skin conditions. Jiang huang is being studied in the prevention and treatment of some types of cancer. Its scientific name is Curcuma longa. Also called Indian saffron and turmeric.
    More Information
    - Curcumin (Curcuma, Turmeric) and Cancer
  Jim’s Juice: (jimz joos)
    Pronunciation of dictionary term "Jim’s Juice"
    A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in Jim’s Juice have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give Jim’s Juice as a treatment for any disease. Also called 126–F, Cancell, Cantron, JS–101, JS–114, Protocel, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  JM 216: A substance being studied in the treatment of prostate and other types of cancer. It contains the metal platinum and may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called BMS-182751 and satraplatin.
  JMML: A rare form of childhood leukemia in which cancer cells often spread into tissues such as the skin, lung, and intestines. Also called juvenile myelomonocytic leukemia.
  johimbe: (yo-HIM-bay)
    Pronunciation of dictionary term "johimbe"
    A tree native to West Africa. The bark is used as a supplement for bodybuilding and to enhance male sexual performance. It contains the chemical yohimbine, which is being studied in the treatment of sexual dysfunction. It may interact with certain drugs used to treat depression, high blood pressure, and high blood sugar. The scientific name is Pausinystalia yohimbe. Also called yohimbe.
  joint: (joynt)
    Pronunciation of dictionary term "joint"
    In medicine, the place where two or more bones are connected. Examples include the shoulder, elbow, knee, and jaw.
  JPS: A rare, inherited disorder in which multiple abnormal growths called juvenile polyps form in the gastrointestinal tract, usually before the age of 20 years. To be diagnosed with JPS, a person must have one or more of the following: (1) more than five juvenile polyps in the colon or rectum; (2) juvenile polyps in other parts of the gastrointestinal tract, including the stomach or small intestine; (3) any number of juvenile polyps and a family history of JPS. Other signs and symptoms include diarrhea, gastrointestinal bleeding, abdominal pain, anemia, extra fingers and toes, and abnormalities of the heart, brain, roof of the mouth, intestines, urinary tract, and genitals. People with JPS also have an increased risk of colorectal cancer, stomach cancer, small intestine cancer, and pancreatic cancer. JPS is caused by mutations (changes) in the SMAD4 or BMPR1A genes that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called juvenile polyposis syndrome.
    More Information
    - Juvenile polyposis syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3065/juvenile-polyposis-syndrome)
    - Juvenile polyposis syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/juvenile-polyposis-syndrome/)
  JS–101: A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in JS–101 have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give JS–101 as a treatment for any disease. Also called 126–F, Cancell, Cantron, Jim’s Juice, JS–114, Protocel, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  JS–114: A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in JS–114 have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give JS–114 as a treatment for any disease. Also called 126–F, Cancell, Cantron, Jim’s Juice, JS–101, Protocel, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  juicing: (JOO-sing)
    Pronunciation of dictionary term "juicing"
    The process of extracting the liquid contents from fruits and vegetables. This results in a drink that contains water, vitamins, minerals, and antioxidants but no fiber. Juicing may also refer to a diet in which some or all of a person’s calories come from fresh juice. Fresh juice can be made from a single type of fruit, vegetable, or combination. Drinking fresh juice can be part of a balanced diet. It may help people get nutrients from fruits and vegetables they would normally not eat. There is no proof that drinking fresh juice can slow, cure, or keep diseases such as cancer from coming back.
  junctional epidermolysis bullosa: (JUNK-shuh-nul EH-pih-der-MAH-lih-sis buh-LOH-suh)
    Pronunciation of dictionary term "junctional epidermolysis bullosa"
    A rare, inherited disorder in which blisters form on the skin and the moist inner lining of some organs and body cavities. The blisters usually appear at birth and may occur on certain parts of the body (such as the hands, feet, elbows, and knees) or all over the body (including the mouth and other parts of the digestive tract, the eyes, the genitourinary tract, and the respiratory tract). This can lead to scarring and red, bumpy skin that bleeds easily in the affected areas. Other signs and symptoms include deformities in the fingers, toes, nails, and joints; thinning of the teeth; hair loss; trouble eating and digesting food; slow growth; and poor nutrition. Some infants with junctional epidermolysis bullosa have a severe form of the disease and may die within the first year of life. Other patients have a mild form and may have a normal life span. Some people with this disorder have an increased risk of developing squamous cell skin cancer at an early age. Junctional epidermolysis bullosa is caused by mutations (changes) in the COL17A1, ITGA6, ITGB4, LAMA3, LAMB3, or LAMC2 gene.
    More Information
    - Junctional epidermolysis bullosa (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2152/junctional-epidermolysis-bullosa)
    - Junctional epidermolysis bullosa (MedlinePlus) (https://medlineplus.gov/genetics/condition/junctional-epidermolysis-bullosa/)
  junctional nevus: (JUNK-shuh-nul NEE-vus)
    Pronunciation of dictionary term "junctional nevus"
    A type of nevus (mole) found at the junction (border) between the epidermis (outer) and the dermis (inner) layers of the skin. These moles may be colored and slightly raised.
  juvenile myelomonocytic leukemia: (JOO-veh-NILE MY-eh-loh-MAH-noh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "juvenile myelomonocytic leukemia"
    A rare form of childhood leukemia in which cancer cells often spread into tissues such as the skin, lung, and intestines. Also called JMML.
  juvenile nasopharyngeal angiofibroma: (JOO-veh-nile NAY-zoh-fuh-RIN-jee-ul AN-jee-oh-fy-BROH-muh)
    Pronunciation of dictionary term "juvenile nasopharyngeal angiofibroma"
    A benign (not cancer) tumor that is made up of blood vessels and fibrous (connective) tissue. Juvenile nasopharyngeal angiofibromas form in the back of the nose and may spread to the upper part of the throat, the sinuses around the nose, the bone around the eyes, and rarely, to the brain. Signs and symptoms may include runny nose, nosebleeds, problems breathing through the nose, hearing loss, and easy bruising. Juvenile nasopharyngeal angiofibromas are most common in young men. They are a type of vascular tumor.
  juvenile pilocytic astrocytoma: (JOO-veh-NILE PY-loh-SIH-tik AS-troh-sy-TOH-muh)
    Pronunciation of dictionary term "juvenile pilocytic astrocytoma"
    A slow-growing type of central nervous system tumor that forms from glial (supportive) tissue of the brain and spinal cord. Juvenile pilocytic astrocytoma usually occurs in children and young adults. It forms in the brain more often than the spinal cord.
  juvenile polyposis syndrome: (JOO-veh-nile PAH-lee-POH-sis SIN-drome)
    Pronunciation of dictionary term "juvenile polyposis syndrome"
    A rare, inherited disorder in which multiple abnormal growths called juvenile polyps form in the gastrointestinal tract, usually before the age of 20 years. To be diagnosed with juvenile polyposis syndrome, a person must have one or more of the following: (1) more than five juvenile polyps in the colon or rectum; (2) juvenile polyps in other parts of the gastrointestinal tract, including the stomach or small intestine; (3) any number of juvenile polyps and a family history of juvenile polyposis syndrome. Other signs and symptoms include diarrhea, gastrointestinal bleeding, abdominal pain, anemia, extra fingers and toes, and abnormalities of the heart, brain, roof of the mouth, intestines, urinary tract, and genitals. People with juvenile polyposis syndrome also have an increased risk of colorectal cancer, stomach cancer, small intestine cancer, and pancreatic cancer. Juvenile polyposis syndrome is caused by mutations (changes) in the SMAD4 or BMPR1A genes that are inherited in an autosomal dominant manner. It is a type of hereditary cancer syndrome. Also called JPS.
    More Information
    - Juvenile polyposis syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3065/juvenile-polyposis-syndrome)
    - Juvenile polyposis syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/juvenile-polyposis-syndrome/)
  juvenile rickets: (JOO-veh-NILE RIH-kets)
    Pronunciation of dictionary term "juvenile rickets"
    A condition in children in which bones become soft and deformed because they don’t have enough calcium and phosphorus. It is caused by not having enough vitamin D in the diet or by not getting enough sunlight. In adults, this condition is called osteomalacia. Also called infantile rickets, rachitis, and rickets.
  K-RAS gene: (KAY-ras jeen)
    Pronunciation of dictionary term "K-ras gene"
    A gene that makes a protein called KRAS, which is involved in cell signaling pathways that control cell growth, cell maturation, and cell death. The natural, unchanged form of the gene is called wild-type KRAS. Mutated (changed) forms of the K-RAS gene have been found in some types of cancer, including non-small cell lung cancer (NSCLC), colorectal cancer, and pancreatic cancer. These changes may cause cancer cells to grow and spread in the body. Knowing whether a patient’s tumor has a wild-type or mutated K-RAS gene may help plan cancer treatment. Also called KRAS gene.
  Kadcyla: (kad-SY-luh)
    Pronunciation of dictionary term "Kadcyla"
    A drug used to treat certain patients with HER2-positive breast cancer that has already been treated with trastuzumab and a type of anticancer drug called a taxane. It is also being studied in the treatment of other types of cancer. Kadcyla contains a monoclonal antibody called trastuzumab that binds to a protein called HER2, which is found on some breast cancer cells. It also contains an anticancer drug called DM1, which may help kill cancer cells. Kadcyla is a type of antibody-drug conjugate. Also called ado-trastuzumab emtansine and T-DM1.
    More Information
    - Ado-Trastuzumab Emtansine (https://www.cancer.gov/about-cancer/treatment/drugs/ado-trastuzumab-emtansine)
  Kahler disease: (KAH-ler dih-ZEEZ)
    Pronunciation of dictionary term "Kahler disease"
    A type of cancer that begins in plasma cells (white blood cells that produce antibodies). Also called multiple myeloma, myelomatosis, and plasma cell myeloma.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
    Multiple myeloma. Multiple myeloma cells are abnormal plasma cells (a type of white blood cell) that build up in the bone marrow and form tumors in many bones of the body. Normal plasma cells make antibodies to help the body fight infection and disease. As the number of multiple myeloma cells increases, more antibodies are made. This can cause the blood to thicken and keep the bone marrow from making enough healthy blood cells. Multiple myeloma cells also damage and weaken the bone.
    Multiple myeloma; drawing shows normal plasma cells, multiple myeloma cells (abnormal plasma cells), and antibodies. Also shown is red marrow inside bone, where plasma cells are made.
  Kaletra: (kuh-LEH-truh)
    Pronunciation of dictionary term "Kaletra"
    A combination of the drugs ritonavir and lopinavir. It is used to treat infection with HIV (the virus that causes AIDS). It is also being studied in the treatment of some types of cancer. Kaletra blocks the ability of HIV to make copies of itself and may help other anticancer drugs work better or may block the growth of cancer cells. Ritonavir blocks the breakdown of lopinavir. Kaletra is a type of anti-HIV agent and a type of protease inhibitor. Also called lopinavir/ritonavir.
  Kanjinti: (kan-JIN-tee)
    Pronunciation of dictionary term "Kanjinti"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Kanjinti binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Kanjinti is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Hercessi, Herzuma, Ogivri, Ontruzant, trastuzumab, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  Kaposi sarcoma: (kuh-POH-zee sar-KOH-muh)
    Pronunciation of dictionary term "Kaposi sarcoma"
    A type of cancer in which lesions (abnormal areas) grow in the skin, lymph nodes, lining of the mouth, nose, and throat, and other tissues of the body. The lesions are usually purple and are made of cancer cells, new blood vessels, and blood cells. They may begin in more than one place in the body at the same time. Kaposi sarcoma is caused by Kaposi sarcoma-associated herpesvirus (KSHV). In the United States, it usually occurs in people who have a weak immune system caused by AIDS or by drugs used in organ transplants. It is also seen in older men of Jewish or Mediterranean descent, or in young men in Africa.
    More Information
    - Kaposi Sarcoma Treatment
  Kaposi sarcoma-associated herpesvirus: (kuh-POH-zee sar-KOH-muh-uh-SOH-see-ay-ted HER-peez-VY-rus)
    Pronunciation of dictionary term "Kaposi sarcoma-associated herpesvirus"
    A type of virus that causes Kaposi sarcoma (a rare cancer in which lesions grow in the skin, lymph nodes, lining of the mouth, nose, and throat, and other tissues of the body). Kaposi sarcoma-associated herpesvirus also causes certain types of lymphoma (cancer that begins in cells of the immune system). Also called HHV8, human herpesvirus 8, and KSHV.
  kaposiform hemangioendothelioma: (kuh-POH-zee-form hee-MAN-jee-oh-EN-doh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "kaposiform hemangioendothelioma"
    A rare blood vessel tumor that usually forms on the skin of the arms and legs, but may also form in deeper tissues, such as muscle and bone. Kaposiform hemangioendotheliomas may sometimes form in the lymph nodes, chest, abdomen, or bones. They are fast growing and can spread to nearby tissue, but usually do not spread to other parts of the body. Signs and symptoms may include firm, painful areas of skin that look bruised; purple or brownish-red areas on the skin; easy bruising; anemia; and abnormal bleeding. Kaposiform hemangioendotheliomas are most common in infants and young children. They are a type of vascular tumor.
  karenitecin: (kuh-REH-nih-TEE-kan)
    Pronunciation of dictionary term "karenitecin"
    A drug being studied in the treatment of cancer. It is a type of topoisomerase inhibitor. It is related to the anticancer drug camptothecin.
  Karnofsky Performance Status: (kar-NOF-skee per-FOR-munts STA-tus)
    Pronunciation of dictionary term "Karnofsky Performance Status"
    A standard way of measuring the ability of cancer patients to perform ordinary tasks. The Karnofsky Performance Status scores range from 0 to 100. A higher score means the patient is better able to carry out daily activities. Karnofsky Performance Status may be used to determine a patient's prognosis, to measure changes in a patient’s ability to function, or to decide if a patient could be included in a clinical trial. Also called KPS.
  karyotyping: (KAYR-ee-oh-ty-ping)
    Pronunciation of dictionary term "karyotyping"
    A type of genetic test that analyzes the size, shape, and number of chromosomes in a sample of cells taken from blood, amniotic fluid, bone marrow, or other tissue. Changes in the number or structure of chromosomes may be a sign of a birth defect or genetic disease or condition, such as Down syndrome, Klinefelter syndrome, or Turner syndrome. Karyotyping may also be used to help diagnose certain types of cancer, such as leukemia, lymphoma, or myeloma, and/or help plan treatment.
    More Information
    - Karyotype Genetic Test (MedlinePlus) (https://medlineplus.gov/lab-tests/karyotype-genetic-test/)
  Kasabach-Merritt syndrome: (KAS-uh-bak-MAYR-it SIN-drome)
    Pronunciation of dictionary term "Kasabach-Merritt syndrome"
    A rare condition in which the blood is not able to clot and serious bleeding may occur. It occurs in some patients who have blood vessel tumors called tufted angiomas and kaposiform hemangioendotheliomas. These tumors usually form on the skin but may also form in deeper tissues, such as muscle and bone. The tumors may grow quickly and trap and destroy platelets, which are needed to form clots and stop bleeding. Kasabach-Merritt syndrome is most common in infants and young children.
    More Information
    - Childhood Vascular Tumors
  Kassebaum Kennedy Act: (KAH-seh-bawm KEH-nuh-dee ...)
    Pronunciation of dictionary term "Kassebaum Kennedy Act"
    A 1996 U.S. law that allows workers and their families to keep their health insurance when they change or lose their jobs. The privacy rule of the Kassebaum Kennedy Act protects the privacy of a person’s health information and keeps it from being misused. It gives people the right to receive and review their health records and to choose with whom their health care providers and health insurance companies share their information (including friends, family members, and caregivers). The law also includes standards for setting up and maintaining secure electronic health records. Also called Health Insurance Portability and Accountability Act and HIPAA.
  kava kava: (KAH-vuh KAH-vuh)
    Pronunciation of dictionary term "kava kava"
    An herb native to islands in the South Pacific. Substances taken from the root have been used in some cultures to relieve stress, anxiety, tension, sleeplessness, and problems of menopause. Kava kava may increase the effect of alcohol and of certain drugs used to treat anxiety and depression. The U.S. Food and Drug Administration advises users that kava kava may cause severe liver damage. The scientific name is Piper methysticum. Also called intoxicating pepper, rauschpfeffer, tonga, and yangona.
  keloid: (KEE-loyd)
    Pronunciation of dictionary term "keloid"
    A thick, irregular scar caused by excessive tissue growth at the site of an incision or wound.
  kelp: (kelp)
    Pronunciation of dictionary term "kelp"
    A type of seaweed. The stem-like parts of this plant have been used in some cultures to treat certain medical problems. It may have immunostimulatory and anticancer effects. The scientific name is Laminaria digitata.
  Kemstro: (KEM-stroh)
    Pronunciation of dictionary term "Kemstro"
    A drug that is used to treat certain types of muscle spasms and is being studied in the treatment of liver cancer. Kemstro relaxes muscles by blocking certain nerve receptors in the spinal cord. It is a type of antispasmodic. Also called baclofen and Lioresal.
  Kepivance: (KEH-puh-vants)
    Pronunciation of dictionary term "Kepivance"
    A drug used to prevent and treat severe oral mucositis (mouth sores). It is used in patients with blood cancer who are being treated with high-dose chemotherapy and radiation therapy followed by an autologous stem cell transplant. It is also being studied in the prevention and treatment of common side effects in other types of cancer. Kepivance is a form of human keratinocyte growth factor that is made in the laboratory. It binds to certain receptors on the surface of cells in the lining of the mouth, stomach, and intestines. This may help protect healthy tissue from some of the side effects caused by certain types of cancer treatment. Kepivance is a type of cytoprotective agent. Also called palifermin.
    More Information
    - Palifermin (https://www.cancer.gov/about-cancer/treatment/drugs/palifermin)
  Keppra: (KEH-pruh)
    Pronunciation of dictionary term "Keppra"
    A drug used to treat seizures (involuntary muscle movements) caused by epilepsy (a group of brain disorders). Keppra is being studied in the treatment of seizures in patients with cancer that has spread to the brain. It is a type of anticonvulsant. Also called levetiracetam.
  keratan sulfate: (KAYR-uh-tan SUL-fayt)
    Pronunciation of dictionary term "keratan sulfate"
    A glycosaminoglycan (a type of polysaccharide) found in cartilage and in the cornea of the eye.
  keratin: (KAYR-uh-tin)
    Pronunciation of dictionary term "keratin"
    A type of protein found on epithelial cells, which line the inside and outside surfaces of the body. Keratins help form the tissues of the hair, nails, and the outer layer of the skin. They are also found on cells in the lining of organs, glands, and other parts of the body. Certain keratins may be found in higher than normal amounts in patients with different types of epithelial cell cancers, including lung, breast, colorectal, bladder, and head and neck cancers. Measuring the amount of specific keratins in the blood may help to plan cancer treatment or find out how well treatment is working or if cancer has come back. A keratin is a type of tumor marker. Also called cytokeratin.
  keratinocyte carcinoma: (KAYR-uh-TIH-noh-site KAR-sih-NOH-muh)
    Pronunciation of dictionary term "keratinocyte carcinoma"
    Cancer that forms in the tissues of the epidermis (the outer layer of the skin). The two main types of keratinocyte carcinoma are squamous cell carcinoma (SCC), which begins in thin, flat cells that form the top layer of the epidermis, and basal cell carcinoma (BCC), which begins in round cells that form the lower layer of the epidermis. SCC and BCC are the most common types of skin cancer. Keratinocyte carcinoma can occur anywhere on the body, but it is most common in areas of the skin often exposed to sunlight, such as the face, ears, lower lip, neck, arms, and top of the hands. Also called nonmelanoma skin cancer.
    More Information
    - Skin Cancer (Including Melanoma) (https://www.cancer.gov/types/skin)
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  keratinocyte growth factor: (KAYR-uh-TIH-noh-site grothe FAK-ter)
    Pronunciation of dictionary term "keratinocyte growth factor"
    A natural substance that stimulates the growth of epithelial cells in the skin and in the lining of the mouth, stomach, and intestines. A form of keratinocyte growth factor made in the laboratory is called recombinant human keratinocyte growth factor. Also called KGF.
  keratoacanthoma: (KAYR-uh-toh-AK-un-THOH-muh)
    Pronunciation of dictionary term "keratoacanthoma"
    A fast-growing, dome-shaped skin tumor that usually occurs on sun-exposed areas of the body, especially the head, neck, arms, legs, and back of the hands. Keratoacanthomas often begin in a hair follicle. They may look like squamous cell skin cancer, but they are usually benign and rarely spread to other parts of the body. Keratoacanthomas are usually caused by sun exposure, but they may also be caused by a human papilloma virus infection, a weakened immune system, certain genetic conditions, exposure to some cancer-causing chemicals, and an injury to the skin. They usually go away on their own but can sometimes come back. They occur more often in older men.
  Ketalar: (KEE-tuh-lar)
    Pronunciation of dictionary term "Ketalar"
    A drug used to cause a loss of feeling and awareness and to induce sleep in patients having surgery. It is also being studied in the treatment of nerve pain caused by chemotherapy. Ketalar blocks pathways to the brain that are involved in sensing pain. It is a type of general anesthetic. Also called ketamine hydrochloride.
  ketamine: (KEE-tuh-meen)
    Pronunciation of dictionary term "ketamine"
    A drug used to cause a loss of feeling and awareness and to induce sleep in patients having surgery. It is also being studied in the treatment of nerve pain caused by chemotherapy. Ketamine blocks pathways to the brain that are involved in sensing pain. It is a type of general anesthetic. Also called Ketalar and ketamine hydrochloride.
  ketamine hydrochloride: (KEE-tuh-meen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "ketamine hydrochloride"
    A drug used to cause a loss of feeling and awareness and to induce sleep in patients having surgery. It is also being studied in the treatment of nerve pain caused by chemotherapy. Ketamine hydrochloride blocks pathways to the brain that are involved in sensing pain. It is a type of general anesthetic. Also called Ketalar.
  ketoconazole: (KEE-toh-KAH-nuh-zole)
    Pronunciation of dictionary term "ketoconazole"
    A drug that treats infection caused by a fungus. It is also used as a treatment for prostate cancer because it can block the production of male sex hormones.
  ketogenic diet: (KEE-toh-JEH-nik DY-et)
    Pronunciation of dictionary term "ketogenic diet"
    A diet high in fat and low in carbohydrates (sugars) that causes the body to break down fat into molecules called ketones. Ketones circulate in the blood and become the main source of energy for many cells in the body. A ketogenic diet is used to treat some types of epilepsy and is being studied in the treatment of some types of cancer.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  ketone: (KEE-tone)
    Pronunciation of dictionary term "ketone"
    A type of chemical substance used in perfumes, paints, solvents, and found in essential oils (scented liquid taken from plants). Ketones are also made by the body when there is not enough insulin.
  ketoprofen: (KEE-toh-PROH-fen)
    Pronunciation of dictionary term "ketoprofen"
    A drug used to treat mild pain. It is also used to treat menstrual cramps, fever, and symptoms of arthritis, such as pain, tenderness, swelling, and stiffness. Ketoprofen stops the body from making substances that cause pain and inflammation. It is a type of nonsteroidal anti-inflammatory drug (NSAID).
  ketorolac: (KEE-tor-OH-lak)
    Pronunciation of dictionary term "ketorolac"
    A drug that belongs to a family of drugs called nonsteroidal anti-inflammatory agents. It is being studied in cancer prevention.
  keyhole limpet hemocyanin: (KEE-hole LIM-pet HEE-moh-SY-uh-nin)
    Pronunciation of dictionary term "keyhole limpet hemocyanin"
    A substance taken from a marine organism that may be linked to a specific antigen to boost the immune response to that antigen. Keyhole limpet hemocyanin is being studied as a way to increase the immune response to cancer vaccines. It is a type of immune modulator. Also called KLH.
  Keytruda: (kee-TROO-duh)
    Pronunciation of dictionary term "Keytruda"
    A drug that binds to the protein PD-1 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that express the protein PD-L1, that have certain mutations (changes) in genes involved in DNA repair, or that have a high number of tumor mutations. Keytruda is used alone or with other drugs to treat certain types of biliary tract cancer (including bile duct cancer and gallbladder cancer), breast cancer, cervical cancer, classic Hodgkin lymphoma, colorectal cancer, endometrial cancer, esophageal cancer, gastroesophageal junction cancer, head and neck squamous cell carcinoma (SCC), hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, non-small cell lung cancer, primary mediastinal large B-cell lymphoma, renal cell carcinoma (a type of kidney cancer), skin cancer (SCC of the skin, Merkel cell carcinoma, and melanoma), stomach cancer, urothelial carcinoma (a type of bladder or urinary tract cancer), and other solid tumors. It is also being studied in the treatment of other types of cancer. Keytruda may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called pembrolizumab.
    More Information
    - Pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)
  KGF: A natural substance that stimulates the growth of epithelial cells in the skin and in the lining of the mouth, stomach, and intestines. A form of KGF made in the laboratory is called recombinant human keratinocyte growth factor. Also called keratinocyte growth factor.
  Ki-67 proliferation index: (… proh-LIH-feh-RAY-shun …)
    Pronunciation of dictionary term "Ki-67 proliferation index"
    A way to measure how fast cancer cells in a tumor are dividing. Ki-67 is a protein that is found only in cells that are dividing. A high Ki-67 proliferation index means many cells are dividing quickly and that the cancer is likely to grow and spread. A Ki-67 proliferation index over 30% is typically considered high. The Ki-67 proliferation index may be used to help predict how well some cancers, such as breast cancer, will respond to certain treatments, such as chemotherapy. Also called Ki-67 score.
  Ki-67 score: (… skor)
    Pronunciation of dictionary term "Ki-67 score"
    A way to measure how fast cancer cells in a tumor are dividing. Ki-67 is a protein that is found only in cells that are dividing. A high Ki-67 score means many cells are dividing quickly and that the cancer is likely to grow and spread. A Ki-67 score over 30% is typically considered high. The Ki-67 score may be used to help predict how well some cancers, such as breast cancer, will respond to certain treatments, such as chemotherapy. Also called Ki-67 proliferation index.
  kidney: (KID-nee)
    Pronunciation of dictionary term "kidney"
    One of a pair of organs in the abdomen. The kidneys remove waste and extra water from the blood (as urine) and help keep chemicals (such as sodium, potassium, and calcium) balanced in the body. The kidneys also make hormones that help control blood pressure and stimulate bone marrow to make red blood cells.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    Anatomy of the male urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra passing through the penis. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the prostate.
    Anatomy of the female urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the female urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The uterus is also shown.
  kidney cancer: (KID-nee KAN-ser)
    Pronunciation of dictionary term "kidney cancer"
    Cancer that forms in tissues of the kidneys. There are many different types of kidney cancer, including renal cell carcinoma (RCC), transitional cell cancer (TCC) of the renal pelvis, and Wilms tumor. RCC is the most common type of kidney cancer in adults. It forms in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. TCC of the renal pelvis is kidney cancer that forms in the center of the kidney where urine collects. Wilms tumor is a type of kidney cancer that usually develops in children.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  kidney failure: (KID-nee FAYL-yer)
    Pronunciation of dictionary term "kidney failure"
    A condition in which the kidneys stop working and are not able to remove waste and extra water from the blood or keep body chemicals in balance. Acute or severe kidney failure happens suddenly (for example, after an injury) and may be treated and cured. Chronic kidney failure develops over many years, may be caused by conditions like high blood pressure or diabetes, and cannot be cured. Chronic kidney failure may lead to total and long-lasting kidney failure, called end-stage renal disease (ESRD). A person in ESRD needs dialysis (the process of cleaning the blood by passing it through a membrane or filter) or a kidney transplant. Also called renal failure.
  kidney function: (KID-nee FUNK-shun)
    Pronunciation of dictionary term "kidney function"
    A term used to describe how well the kidneys work. The kidneys remove waste and extra water from the blood (as urine) and help keep chemicals (such as sodium, potassium, and calcium) balanced in the body. They also make hormones that help control blood pressure and stimulate bone marrow to make red blood cells. Also called renal function.
  kidney function test: (KID-nee FUNK-shun ...)
    Pronunciation of dictionary term "kidney function test"
    A test in which blood or urine samples are checked for the amounts of certain substances released by the kidneys. A higher- or lower-than-normal amount of a substance can be a sign that the kidneys are not working the way they should. Also called renal function test.
  killer T cell: (KIH-ler ... sel)
    Pronunciation of dictionary term "killer T cell"
    A type of immune cell that can kill certain cells, including foreign cells, cancer cells, and cells infected with a virus. Killer T cells can be separated from other blood cells, grown in the laboratory, and then given to a patient to kill cancer cells. A killer T cell is a type of white blood cell and a type of lymphocyte. Also called cytotoxic T cell and cytotoxic T lymphocyte.
  kilogram: (KIH-loh-gram)
    Pronunciation of dictionary term "kilogram"
    A measure of weight. A kilogram is equal to 2.2 pounds.
  Kimmtrak: (KIM-trak)
    Pronunciation of dictionary term "Kimmtrak"
    A drug used to treat adults with uveal melanoma (a type of eye cancer) that has spread or cannot be removed by surgery. It is used in patients who have the HLA-A*02:01 antigen. It is also being studied in the treatment of other types of cancer. Kimmtrak binds to certain antigens found on the surfaces of uveal melanoma cells and T cells (a type of immune cell). This may help the immune system kill cancer cells. Kimmtrak is a type of bispecific fusion protein. Also called tebentafusp.
    More Information
    - Tebentafusp-tebn (https://www.cancer.gov/about-cancer/treatment/drugs/tebentafusp-tebn)
  Kinaret: (KIH-nuh-ret)
    Pronunciation of dictionary term "Kinaret"
    A substance that is used to treat rheumatoid arthritis, and is being studied in the treatment of cancer. Kinaret blocks the action of interleukin 1 (IL-1). It is a type of interleukin receptor antagonist. Also called anakinra.
  kinase: (KY-nays)
    Pronunciation of dictionary term "kinase"
    A type of enzyme (a protein that speeds up chemical reactions in the body) that adds chemicals called phosphates to other molecules, such as sugars or proteins. This may cause other molecules in the cell to become either active or inactive. Kinases are a part of many cell processes. Some cancer treatments target certain kinases that are linked to cancer.
  kinase inhibitor: (KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "kinase inhibitor"
    A substance that blocks a type of enzyme called a kinase. Human cells have many different kinases, and they help control important functions, such as cell signaling, metabolism, division, and survival. Certain kinases are more active in some types of cancer cells and blocking them may help keep the cancer cells from growing. Kinase inhibitors may also block the growth of new blood vessels that tumors need to grow. Some kinase inhibitors are used to treat cancer.
    More Information
    - Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
  Kisqali: (kis-KAH-lee)
    Pronunciation of dictionary term "Kisqali"
    A drug used with an aromatase inhibitor or fulvestrant (a type of hormone therapy) to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer. It is also being studied in the treatment of other types of cancer. Kisqali blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Also called ribociclib succinate.
    More Information
    - Ribociclib Succinate (https://www.cancer.gov/about-cancer/treatment/drugs/ribociclib)
  Kisqali Femara Co-Pack: (kis-KAH-lee feh-MUH-ruh KOH-pak)
    Pronunciation of dictionary term "Kisqali Femara Co-Pack"
    A combination pack of two drugs used to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer. It is also being studied in the treatment of other types of cancer. Ribociclib succinate blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Letrozole lowers the amount of estrogen made by the body, which may stop the growth of cancer cells that need estrogen to grow. It is a type of aromatase inhibitor. Kisqali Femara Co-Pack may work better than either drug alone. Also called ribociclib succinate and letrozole.
    More Information
    - Ribociclib Succinate and Letrozole (https://www.cancer.gov/about-cancer/treatment/drugs/ribociclib-succinate-and-letrozole)
  kit ligand: (... LIH-gund)
    Pronunciation of dictionary term "kit ligand"
    A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. Kit ligand is a type of cytokine and a type of growth factor. Also called SCF and stem cell factor.
  Klatskin tumor: (KLAT-skin TOO-mer)
    Pronunciation of dictionary term "Klatskin tumor"
    Cancer that forms in the area where the left and right hepatic ducts join just outside the liver and form the common hepatic duct. Bile ducts carry bile from the liver and gallbladder to the small intestine. Klatskin tumor is a type of extrahepatic bile duct cancer. Also called perihilar bile duct cancer and perihilar cholangiocarcinoma.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  Klebsiella: (KLEB-see-EH-luh)
    Pronunciation of dictionary term "Klebsiella"
    A bacterium that frequently causes lung, urinary tract, intestinal, and wound infections.
  KLH: A substance taken from a marine organism that may be linked to a specific antigen to boost the immune response to that antigen. KLH is being studied as a way to increase the immune response to cancer vaccines. It is a type of immune modulator. Also called keyhole limpet hemocyanin.
  Klinefelter syndrome: (KLINE-fel-ter SIN-drome)
    Pronunciation of dictionary term "Klinefelter syndrome"
    A genetic disorder in males caused by having one or more extra X chromosomes. Males with this disorder may have larger than normal breasts, a lack of facial and body hair, a rounded body type, and small testicles. They may learn to speak much later than other children and may have difficulty learning to read and write. Klinefelter syndrome increases the risk of developing extragonadal germ cell tumors and breast cancer.
    More Information
    - Klinefelter syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8705/klinefelter-syndrome)
    - Klinefelter syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/klinefelter-syndrome/)
  Klippel-Trenaunay syndrome: (klih-PEL-tray-noh-NAY SIN-drome)
    Pronunciation of dictionary term "Klippel-Trenaunay syndrome"
    A rare disorder that affects the blood vessels, soft tissues, and bones. It may also affect the lymph vessels. Klippel-Trenaunay syndrome is marked by a port-wine stain (a red or purplish birthmark caused by swelling of small blood vessels near the surface of the skin), abnormal overgrowth of bone and soft tissue, and varicose veins or other abnormal veins. It usually affects the legs, but it can also affect the arms or trunk. Klippel-Trenaunay syndrome is present at birth.
    More Information
    - Klippel-Trenaunay syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3122/klippel-trenaunay-syndrome)
    - Klippel-Trenaunay syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/klippel-trenaunay-syndrome/)
  Korean acupuncture: (kuh-REE-un AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "Korean acupuncture"
    A type of acupuncture based on a form of Oriental medicine in which treatment is based on a person’s constitution. According to this type of medicine, the constitution is the specific way a person’s organs affect health and how he or she looks, thinks, behaves, and responds to treatment. Also called constitutional acupuncture.
  KOS-862: A substance being studied in the treatment of cancer. It is a type of mitotic inhibitor and epothilone. Also called epothilone D.
  Koselugo: (koh-SEL-yoo-goh)
    Pronunciation of dictionary term "Koselugo"
    A drug used to treat children aged 2 years and older with a rare genetic condition called neurofibromatosis type 1. It is used in patients who have plexiform neurofibromas that are causing symptoms and cannot be removed by surgery. It is also being studied in the treatment of some types of cancer. Koselugo blocks proteins called MEK1 and MEK2, which may help keep abnormal cells or cancer cells from growing. It is a type of kinase inhibitor. Also called AZD6244, MEK inhibitor AZD6244, and selumetinib sulfate.
    More Information
    - Selumetinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/selumetinibsulfate)
  Kostmann disease: (KOST-mun dih-ZEEZ)
    Pronunciation of dictionary term "Kostmann disease"
    An inherited disorder in which there is a lower-than-normal number of neutrophils (a type of white blood cell that is important in fighting infections). Infants with the disorder get infections caused by bacteria, and are at an increased risk of acute myelogenous leukemia (AML) or myelodysplasia (a bone marrow disorder). Also called congenital neutropenia, genetic infantile agranulocytosis, infantile genetic agranulocytosis, Kostmann neutropenia, and Kostmann syndrome.
    More Information
    - Severe congenital neutropenia (MedlinePlus) (https://medlineplus.gov/genetics/condition/severe-congenital-neutropenia/)
    - Severe congenital neutropenia autosomal recessive 3 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/302/kostmann-disease)
  Kostmann neutropenia: (KOST-mun noo-troh-PEE-nee-uh)
    Pronunciation of dictionary term "Kostmann neutropenia"
    An inherited disorder in which there is a lower-than-normal number of neutrophils (a type of white blood cell that is important in fighting infections). Infants with the disorder get infections caused by bacteria, and are at an increased risk of acute myelogenous leukemia (AML) or myelodysplasia (a bone marrow disorder). Also called congenital neutropenia, genetic infantile agranulocytosis, infantile genetic agranulocytosis, Kostmann disease, and Kostmann syndrome.
    More Information
    - Severe congenital neutropenia (MedlinePlus) (https://medlineplus.gov/genetics/condition/severe-congenital-neutropenia/)
    - Severe congenital neutropenia autosomal recessive 3 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/302/kostmann-disease)
  Kostmann syndrome: (KOST-mun SIN-drome)
    Pronunciation of dictionary term "Kostmann syndrome"
    An inherited disorder in which there is a lower-than-normal number of neutrophils (a type of white blood cell that is important in fighting infections). Infants with the disorder get infections caused by bacteria, and are at an increased risk of acute myelogenous leukemia (AML) or myelodysplasia (a bone marrow disorder). Also called congenital neutropenia, genetic infantile agranulocytosis, infantile genetic agranulocytosis, Kostmann disease, and Kostmann neutropenia.
    More Information
    - Severe congenital neutropenia (MedlinePlus) (https://medlineplus.gov/genetics/condition/severe-congenital-neutropenia/)
    - Severe congenital neutropenia autosomal recessive 3 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/302/kostmann-disease)
  KPS: A standard way of measuring the ability of cancer patients to perform ordinary tasks. The KPS scores range from 0 to 100. A higher score means the patient is better able to carry out daily activities. KPS may be used to determine a patient's prognosis, to measure changes in a patient’s ability to function, or to decide if a patient could be included in a clinical trial. Also called Karnofsky Performance Status.
  KRAS gene: (KAY-ras jeen)
    Pronunciation of dictionary term "KRAS gene"
    A gene that makes a protein that is involved in cell signaling pathways that control cell growth, cell maturation, and cell death. The natural, unchanged form of the gene is called wild-type KRAS. Mutated (changed) forms of the KRAS gene have been found in some types of cancer, including non-small cell lung cancer, colorectal cancer, and pancreatic cancer. These changes may cause cancer cells to grow and spread in the body. Knowing whether a patient’s tumor has a wild-type or mutated KRAS gene may help plan cancer treatment.
  Krazati: (krah-ZAH-tee)
    Pronunciation of dictionary term "Krazati"
    A drug used alone or with cetuximab to treat adults with colorectal cancer or non-small cell lung cancer that has spread and has a certain mutation (change) in the KRAS gene. It is used in patients whose cancer was treated with other systemic therapy. It is also being studied in the treatment of other types of cancer. Krazati blocks a protein (KRAS G12C) made by the mutated KRAS gene, which may help keep cancer cells from growing and may kill them. It is a type of targeted therapy. Also called adagrasib.
    More Information
    - Adagrasib (https://www.cancer.gov/about-cancer/treatment/drugs/adagrasib)
  kretek: (KREE-tek)
    Pronunciation of dictionary term "kretek"
    A type of cigarette that is made in Indonesia. It is made using a mixture of tobacco, cloves, and other ingredients. Kreteks contain nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Smoking kreteks can lead to nicotine addiction and can cause lung cancer and other lung conditions. Also called clove cigarette.
    More Information
    - Harms of Cigarette Smoking and Health Benefits of Quitting (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/cessation-fact-sheet)
  KRN5500: An anticancer drug that is a type of antitumor antibiotic. It is an anthracycline.
  KRN7000: A drug being studied in the treatment of cancer. It is a biological response modifier that is a type of glycosphingolipid or agelasphin.
  KRT14 gene: (... jeen)
    Pronunciation of dictionary term "KRT14 gene"
    A gene that makes a protein that is a type of keratin involved in forming the structure of certain cells, especially those that make up the skin, hair, and nails, and in the development of sweat glands and fingerprints. Mutations (changes) in the KRT14 gene have been found in an inherited condition called epidermolysis bullosa simplex, which causes the skin to tear and blister easily. People with this condition have an increased risk of developing skin cancer.
    More Information
    - KRT14 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/krt14)
  KRT5 gene: (... jeen)
    Pronunciation of dictionary term "KRT5 gene"
    A gene that makes a protein that is a type of keratin involved in forming the structure of certain cells, especially those that make up the skin, hair, and nails, and in the development of skin color. Mutations (changes) in the KRT5 gene have been found in an inherited condition called epidermolysis bullosa simplex, which causes the skin to tear and blister easily. People with this condition have an increased risk of developing skin cancer.
    More Information
    - KRT5 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/krt5)
  Krukenberg tumor: (KROO-ken-berg TOO-mer)
    Pronunciation of dictionary term "Krukenberg tumor"
    A tumor in the ovary caused by the spread of stomach cancer.
  KSHV: A type of virus that causes Kaposi sarcoma (a rare cancer in which lesions grow in the skin, lymph nodes, lining of the mouth, nose, and throat, and other tissues of the body). KSHV also causes certain types of lymphoma (cancer that begins in cells of the immune system). Also called HHV8, human herpesvirus 8, and Kaposi sarcoma-associated herpesvirus.
  KW2189: A semisynthetic anticancer drug that is a type of antitumor antibiotic.
  KX2-391: A substance being studied in the treatment of cancer. KX2-391 blocks an enzyme needed for growth of cells and may kill cancer cells. It is a type of Src kinase inhibitor.
  Kymriah: (kim-RY-uh)
    Pronunciation of dictionary term "Kymriah"
    A drug used to treat adults with certain types of B-cell non-Hodgkin lymphoma and people up to 25 years old with certain types of B-cell acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Kymriah is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Kymriah binds to a protein called CD19, which is found on some leukemia and lymphoma cells. This helps the body’s immune system kill cancer cells. Kymriah is a type of CAR T-cell therapy. Also called tisagenlecleucel.
    More Information
    - Tisagenlecleucel (https://www.cancer.gov/about-cancer/treatment/drugs/tisagenlecleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  kyphosis: (ky-FOH-sis)
    Pronunciation of dictionary term "kyphosis"
    A condition marked by a humpback-like rounding or outward curve of the upper backbone. It may be present at birth or it may be caused by growth problems, arthritis, osteoporosis, tumors, or certain other disorders. It may also occur at some point in time after radiation therapy to the backbone.
  Kyprolis: (ky-PROH-lis)
    Pronunciation of dictionary term "Kyprolis"
    A drug used alone or with other drugs to treat adults with multiple myeloma that came back or did not get better after treatment with one or more other therapies. It is also being studied in the treatment of other types of cancer. Kyprolis blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called carfilzomib.
    More Information
    - Carfilzomib (https://www.cancer.gov/about-cancer/treatment/drugs/carfilzomib)
  Kytril: (KY-tril)
    Pronunciation of dictionary term "Kytril"
    A drug used to prevent nausea and vomiting caused by chemotherapy and radiation therapy. It is also used to prevent nausea and vomiting after surgery. Kytril blocks the action of the chemical serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. It is a type of serotonin receptor antagonist and a type of antiemetic. Also called granisetron hydrochloride.
  L: A measure of volume for a liquid, using the metric system. One L is equal to 1,000 cubic centimeters (cc), 1,000 milliliters (mL), or 1.0567 quarts (qt). Also called liter.
  L-3,5,5’-tetraiodothyronine: (...TEH-truh-i-oh-doh-THY-roh-neen)
    Pronunciation of dictionary term "L-3,5,5’-tetraiodothyronine"
    A hormone that is made by the thyroid gland and contains iodine. L-3,5,5’-tetraiodothyronine increases the rate of chemical reactions in cells and helps control growth and development. L-3,5,5’-tetraiodothyronine can also be made in the laboratory and is used to treat thyroid disorders. Also called T4, thyroxin, and thyroxine.
  L-377,202: A substance that is being studied in the treatment of cancer.
  L-778,123: An anticancer drug that belongs to the family of drugs called enzyme inhibitors. It may inhibit the transformation of normal cells into cancer cells.
  L-arginine: (… AR-jih-neen)
    Pronunciation of dictionary term "L-arginine"
    One of the twenty common amino acids (building blocks of proteins). L-arginine is being studied as a nutritional supplement in the treatment and prevention of cancer and other conditions. Also called arginine.
  L-asparaginase: (... as-PAYR-uh-jih-NAYS)
    Pronunciation of dictionary term "L-asparaginase"
    A drug that is used to treat acute lymphoblastic leukemia (ALL) and is being studied in the treatment of some other types of cancer. It is an enzyme taken from the bacterium Escherichia coli (E. coli). It breaks down the amino acid asparagine and may block the growth of tumor cells that need asparagine to grow. Also called asparaginase and Elspar.
  L-carnitine: (L-KAR-nih-teen)
    Pronunciation of dictionary term "L-carnitine"
    A form of carnitine, which is a substance made in muscle and liver tissue and found in certain foods, such as meat, poultry, fish, and some dairy products. L-carnitine is also a drug that is used to treat patients who do not make enough carnitine and is being studied as a way to prevent tissue damage caused by chemotherapy. Carnitine is a type of dietary supplement. Also called Carnitor and levocarnitine.
  L-glutamic acid: (... gloo-TA-mik A-sid)
    Pronunciation of dictionary term "L-glutamic acid"
    One of twenty amino acids (molecules that join together to form proteins). L-glutamic acid may help nerve cells send and receive information from other cells. It is being studied for its ability to decrease or prevent nerve damage caused by anticancer drugs. Also called glutamic acid.
  L-MTP-PE: A drug being studied in the treatment of young adults with bone cancer that has gotten worse or come back. L-MTP-PE activates certain types of white blood cells and helps the immune system kill cancer cells. It is a type of immunostimulant. Also called MEPACT, mifamurtide, and muramyl tripeptide phosphatidylethanolamine.
  L-norgestrel: (... nor-JES-trel)
    Pronunciation of dictionary term "L-norgestrel"
    A form of the hormone progesterone that is made in the laboratory and used to prevent pregnancy. It is being studied in the prevention of ovarian and endometrial cancer, and in the treatment of other conditions. L-norgestrel is a type of oral contraceptive. Also called levonorgestrel and Plan B.
  L-threo-dihydrosphingosine: (... THREE-oh-dy-HY-drose-SFING-goh-seen)
    Pronunciation of dictionary term "L-threo-dihydrosphingosine"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called protein kinase inhibitors. Also called safingol.
  lab-on-a-chip: (lab-on-uh-chip)
    Pronunciation of dictionary term "lab-on-a-chip"
    An instrument that uses very small amounts of fluid on a microchip to do certain laboratory tests. A lab-on-a-chip may use body fluids or solutions containing cells or cell parts to diagnose diseases. Also called microfluidic device.
  labial mucosa: (LAY-bee-ul myoo-KOH-suh)
    Pronunciation of dictionary term "labial mucosa"
    The inner lining of the lips.
  laboratory study: (LA-bruh-tor-ee STUH-dee)
    Pronunciation of dictionary term "laboratory study"
    Research done in a laboratory. A laboratory study may use special equipment and cells or animals to find out if a drug, procedure, or treatment is likely to be useful in humans. It may also be a part of a clinical trial, such as when blood or other samples are collected. These may be used to measure the effect of a drug, procedure, or treatment on the body.
  laboratory test: (LA-bruh-tor-ee...)
    Pronunciation of dictionary term "laboratory test"
    A medical procedure that involves testing a sample of blood, urine, or other substance from the body. Laboratory tests can help determine a diagnosis, plan treatment, check to see if treatment is working, or monitor the disease over time.
  lacrimal gland: (LA-krih-mul ...)
    Pronunciation of dictionary term "lacrimal gland"
    A gland that secretes tears. The lacrimal glands are found in the upper, outer part of each eye socket.
  lactase: (LAK-tays)
    Pronunciation of dictionary term "lactase"
    An enzyme that breaks down lactose, a type of sugar found in milk and milk products.
  lactate dehydrogenase: (LAK-tayt dee-hy-DRAH-jeh-nays)
    Pronunciation of dictionary term "lactate dehydrogenase"
    One of a group of enzymes found in the blood and other body tissues and involved in energy production in cells. An increased amount of lactate dehydrogenase in the blood may be a sign of tissue damage and some types of cancer or other diseases. Also called lactic acid dehydrogenase and LDH.
  lactation: (lak-TAY-shun)
    Pronunciation of dictionary term "lactation"
    The process of making and secreting milk from the mammary glands in the breasts. Lactation usually begins during pregnancy when changes in certain hormones signal the mammary glands to make milk. After a person gives birth, the nipples release milk when a baby feeds from the breasts or when the person uses a breast pump. Lactation usually continues until milk is no longer being taken from the breasts. Lactation can sometimes be induced using certain hormone medicines in people who are not pregnant. Common factors that can affect lactation include hormone levels, certain medical conditions, breast surgery, injury to the breast or nipple, drug or alcohol use, and taking certain medicines.
  lactic acid: (LAK-tik A-sid)
    Pronunciation of dictionary term "lactic acid"
    A substance made from sugars in milk, by the action of certain enzymes. It is used in skin care products to reduce wrinkles and soften the skin. It is also being studied in the treatment of hand-foot syndrome (a condition marked by pain, swelling, numbness, tingling, or redness of the hands or feet) in patients receiving chemotherapy. Lactic acid is also made in muscles in the body and is used in many chemical processes in the body. It is a type of alpha hydroxyl acid.
  lactic acid dehydrogenase: (LAK-tik A-sid dee-hy-DRAH-jeh-nays)
    Pronunciation of dictionary term "lactic acid dehydrogenase"
    One of a group of enzymes found in the blood and other body tissues, and involved in energy production in cells. An increased amount in the blood may be a sign of tissue damage and some types of cancer or other diseases. Also called lactate dehydrogenase and LDH.
  lactobacillus: (LAK-toh-buh-SIH-lus)
    Pronunciation of dictionary term "lactobacillus"
    A type of bacterium that makes lactic acid (a substance that is made from sugars found in milk and is also made in the body). Lactobacilli usually do not cause disease, but may cause tooth decay. They are normally found in the mouth, gastrointestinal tract, and vagina. They are being studied in the prevention of infections in patients having donor stem cell transplants and in other conditions.
  Lactobacillus rhamnosus GG: (LAK-toh-buh-SIH-lus ram-NOH-sus ...)
    Pronunciation of dictionary term "Lactobacillus rhamnosus GG"
    A live form of a bacterium that makes lactic acid (a substance that is made from sugars found in milk and is also made in the body). Lactobacillus rhamnosus GG is given to help with digestion and normal bowel function. It may also help keep the gastrointestinal (GI) tract healthy. It is being studied in the prevention of infections in patients having donor stem cell transplants and in other conditions. Also called Culturelle.
  lactoferrin: (LAK-toh-fayr-in)
    Pronunciation of dictionary term "lactoferrin"
    A protein that is found in milk, tears, mucus, bile, and some white blood cells and is being studied in the treatment and prevention of cancer. It is involved in fighting against infection and inflammation and it acts as an antioxidant.
  lactose: (LAK-tose)
    Pronunciation of dictionary term "lactose"
    A type of sugar found in milk and milk products.
  lactose intolerance: (LAK-tose in-TAH-leh-runts)
    Pronunciation of dictionary term "lactose intolerance"
    The inability to digest or absorb lactose, a type of sugar found in milk and other dairy products.
  laetrile: (LAY-eh-tril)
    Pronunciation of dictionary term "laetrile"
    A purified form of amygdalin made in the laboratory. Amygdalin is a substance found in the pits of some fruits, such as apricots, and in raw nuts and plants. Laetrile has been used in some countries as a treatment for cancer, but it has not been shown to work in human clinical trials. It is not approved for use in the United States.
    More Information
    - Laetrile/Amygdalin
  LAK cell: (… sel)
    Pronunciation of dictionary term "LAK cell"
    A white blood cell that is stimulated in a laboratory to kill tumor cells. Also called lymphokine-activated killer cell.
  LAMA3 gene: (... jeen)
    Pronunciation of dictionary term "LAMA3 gene"
    A gene that makes one of the three subunits of a protein involved in cell growth, cell movement, and cell attachment. This protein helps protect the skin from damage and may be involved in wound healing and in the formation of tooth enamel and the cornea (the clear outer covering of the eye). Mutations (changes) in the LAMA3 gene have been found in an inherited condition called junctional epidermolysis bullosa, which causes the skin to tear and blister easily. People with this condition have an increased risk of developing skin cancer.
    More Information
    - LAMA3 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/lama3)
  LAMB3 gene: (... jeen)
    Pronunciation of dictionary term "LAMB3 gene"
    A gene that makes one of the three subunits of a protein involved in cell growth, cell movement, and cell attachment. This protein helps protect the skin from damage and may be involved in wound healing and in the formation of tooth enamel and the cornea (the clear outer covering of the eye). Mutations (changes) in the LAMB3 gene have been found in an inherited condition called junctional epidermolysis bullosa, which causes the skin to tear and blister easily. People with this condition have an increased risk of developing skin cancer.
    More Information
    - LAMB3 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/lamb3/)
  LAMC2 gene: (... jeen)
    Pronunciation of dictionary term "LAMC2 gene"
    A gene that makes one of the three subunits of a protein involved in cell growth, cell movement, and cell attachment. This protein helps protect the skin from damage and may be involved in wound healing and in the formation of tooth enamel and the cornea (the clear outer covering of the eye). Mutations (changes) in the LAMC2 gene have been found in an inherited condition called junctional epidermolysis bullosa, which causes the skin to tear and blister easily. People with this condition have an increased risk of developing skin cancer.
    More Information
    - LAMC2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/lamc2)
  lamina propria: (LA-mih-nuh PROH-pree-uh)
    Pronunciation of dictionary term "lamina propria"
    A type of connective tissue found under the thin layer of tissues covering a mucous membrane.
  lamivudine: (luh-MIH-vyoo-deen)
    Pronunciation of dictionary term "lamivudine"
    A drug used to treat infection caused by viruses.
  lamotrigine: (luh-MOH-trih-jeen)
    Pronunciation of dictionary term "lamotrigine"
    A drug that is used to help control some types of seizures. It is being studied in the prevention of peripheral neuropathy caused by some chemotherapy drugs. It belongs to the family of drugs called anticonvulsants.
  Langerhans cell histiocytosis: (LANG-er-hanz sel HIS-tee-oh-sy-TOH-sis)
    Pronunciation of dictionary term "Langerhans cell histiocytosis"
    A group of rare disorders in which too many Langerhans cells (a type of white blood cell) grow in certain tissues and organs including the bones, skin, and lungs, and damage them. Langerhans cell histiocytosis may also affect the pituitary gland (which makes hormones that control other glands and many body functions, especially growth). Langerhans cell histiocytosis is most common in children and young adults. Also called LCH.
    More Information
    - Langerhans cell histiocytosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6858/langerhans-cell-histiocytosis)
    - Langerhans cell histiocytosis (MedlinePlus) (https://medlineplus.gov/genetics/condition/langerhans-cell-histiocytosis/)
    - Langerhans Cell Histiocytosis Treatment
  lanolin: (LA-noh-lin)
    Pronunciation of dictionary term "lanolin"
    An oily substance taken from sheep's wool. Lanolin is used in moisturizing creams and lotions to treat dry, itchy skin.
  Lanoxin: (luh-NOK-sin)
    Pronunciation of dictionary term "Lanoxin"
    A drug used to treat irregular heartbeat and some types of heart failure. It is also being studied in the treatment of some types of cancer. Lanoxin helps the heart work normally by controlling the amount of calcium that goes into the heart muscle. It also may kill cancer cells and make them more sensitive to anticancer drugs. It is a type of cardiac glycoside. Also called digoxin.
  lanreotide acetate: (lan-REE-oh-tide A-seh-tayt)
    Pronunciation of dictionary term "lanreotide acetate"
    A drug that is similar to somatostatin (a hormone made by the body) and is used to treat certain types of gastroenteropancreatic neuroendocrine tumors, carcinoid syndrome, and acromegaly (a condition in which the pituitary gland makes too much growth hormone). Lanreotide acetate may help stop the body from making extra amounts of certain hormones, including growth hormone, insulin, glucagon, and hormones that affect digestion. It may also help keep certain types of tumor cells from growing. Lanreotide acetate is a type of somatostatin analog. Also called Somatuline Depot.
    More Information
    - Lanreotide Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/lanreotideacetate)
  lansoprazole: (lan-SOH-pruh-zole)
    Pronunciation of dictionary term "lansoprazole"
    A drug that reduces the amount of acid made in the stomach. It is used to treat stomach ulcers, gastroesophageal reflux disease (a condition in which acid from the stomach causes heartburn), and conditions in which the stomach makes too much acid. Lansoprazole is a type of proton pump inhibitor (PPI). Also called Prevacid.
  Lantus: (LAN-tus)
    Pronunciation of dictionary term "Lantus"
    A drug used to control the amount of sugar in the blood of patients with diabetes. It is a form of the hormone insulin that is made in the laboratory. Lantus controls blood sugar longer than insulin does. It is a type of therapeutic insulin. Also called insulin glargine and insulin glargine recombinant.
  laparoscope: (LA-puh-ruh-SKOPE)
    Pronunciation of dictionary term "laparoscope"
    A thin, tube-like instrument used to look at tissues and organs inside the abdomen. A laparoscope has a light and a lens for viewing and may have a tool to remove tissue.
  laparoscopic surgery: (LA-puh-ruh-SKAH-pik SER-juh-ree)
    Pronunciation of dictionary term "laparoscopic surgery"
    Surgery done with the aid of a laparoscope. A laparoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. Also called laparoscopic-assisted resection.
  laparoscopic-assisted colectomy: (LA-puh-ruh-SKAH-pik-uh-SIS-ted koh-LEK-toh-mee)
    Pronunciation of dictionary term "laparoscopic-assisted colectomy"
    Surgery done with the aid of a laparoscope to remove all or part of the colon through several small incisions made in the wall of the abdomen. A laparoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. The laparoscope is inserted through one opening to guide the surgery. Surgical instruments are inserted through the other openings to perform the surgery. When only part of the colon is removed, it is called a partial colectomy.
  laparoscopic-assisted resection: (LA-puh-ruh-SKAH-pik-uh-SIS-ted ree-SEK-shun)
    Pronunciation of dictionary term "laparoscopic-assisted resection"
    Surgery done with the aid of a laparoscope. A laparoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. Also called laparoscopic surgery.
  laparoscopy: (LA-puh-ROS-koh-pee)
    Pronunciation of dictionary term "laparoscopy"
    A procedure that uses a laparoscope, inserted through the abdominal wall, to examine the inside of the abdomen. A laparoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
  laparotomy: (LA-puh-RAH-toh-mee)
    Pronunciation of dictionary term "laparotomy"
    A surgical incision made in the wall of the abdomen.
  lapatinib: (luh-PA-tih-nib)
    Pronunciation of dictionary term "lapatinib"
    A drug used to treat HER2 positive (HER2+) breast cancer that is advanced or has spread to other parts of the body. It is used with capecitabine in patients whose cancer has not gotten better with other anticancer drugs. It is used with letrozole in postmenopausal women whose cancer is hormone receptor positive (HR+) and who need hormone therapy. It is also being studied in the treatment of other types of cancer. Lapatinib blocks epidermal growth factor receptor (EGFR) and other proteins, which may help keep cancer cells from growing. Lapatinib is a type of ErbB2 and EGFR dual tyrosine kinase inhibitor. Also called GW572016, lapatinib ditosylate, and Tykerb.
    More Information
    - Lapatinib Ditosylate (https://www.cancer.gov/about-cancer/treatment/drugs/lapatinibditosylate)
  lapatinib ditosylate: (luh-PA-tih-nib dy-TOH-sih-layt)
    Pronunciation of dictionary term "lapatinib ditosylate"
    A drug used with capecitabine or letrozole to treat certain types of HER2-positive breast cancer that are advanced or have spread. It is also being studied in the treatment of other types of cancer. Lapatinib ditosylate blocks EGFR and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Lapatinib is the active ingredient of lapatinib ditosylate. Also called GW572016 and Tykerb.
    More Information
    - Lapatinib Ditosylate (https://www.cancer.gov/about-cancer/treatment/drugs/lapatinibditosylate)
  lappa: (LA-puh)
    Pronunciation of dictionary term "lappa"
    A plant whose seeds and root have been used in some cultures to treat certain medical problems. It may have antioxidant effects. The scientific name is Arctium lappa. Also called burdock and happy major.
  large cell carcinoma: (...KAR-sih-NOH-muh)
    Pronunciation of dictionary term "large cell carcinoma"
    Lung cancer in which the cells are large and look abnormal when viewed under a microscope.
  large granular lymphocyte: (larj GRAN-yoo-lur LIM-foh-site)
    Pronunciation of dictionary term "large granular lymphocyte"
    A type of white blood cell that contains granules with enzymes that can kill tumor cells or microbial cells.
  large intestine: (larj in-TES-tin)
    Pronunciation of dictionary term "large intestine"
    The long, tube-like organ that is connected to the small intestine at one end and the anus at the other. The large intestine has four parts: cecum, colon, rectum, and anal canal. Partly digested food moves through the cecum into the colon, where water and some nutrients and electrolytes are removed. The remaining material, solid waste called stool, moves through the colon, is stored in the rectum, and leaves the body through the anal canal and anus.
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
    The esophagus and stomach are part of the upper gastrointestinal (digestive) system.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.
  laromustine: (LAYR-oh-MUS-teen)
    Pronunciation of dictionary term "laromustine"
    A drug used to treat acute myelogenous leukemia (AML). It is also being studied in the treatment of several other types of cancer. It blocks cell growth by damaging the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Cloretazine and Onrigin.
  larotrectinib sulfate: (LAYR-oh-TREK-tih-nib SUL-fayt)
    Pronunciation of dictionary term "larotrectinib sulfate"
    A drug used to treat adults and children with certain types of solid tumors that have spread or cannot be removed by surgery and have the NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Larotrectinib sulfate blocks the TRK protein, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called LOXO-101, Trk inhibitor LOXO-101, and Vitrakvi.
    More Information
    - Larotrectinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)
  Lartruvo: (lar-TROO-voh)
    Pronunciation of dictionary term "Lartruvo"
    A drug used with doxorubicin to treat soft tissue sarcoma that cannot be treated with radiation therapy or surgery. It is used in patients whose cancer has not already been treated with an anthracycline (a type of anticancer drug). It is also being studied in the treatment of other types of cancer. Lartruvo binds to a receptor for a protein called platelet-derived growth factor (PDGF), which is found on some types of cancer cells. Blocking this protein receptor may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. Lartruvo is a type of monoclonal antibody. Also called anti-PDGFR alpha monoclonal antibody IMC-3G3, anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3, IMC-3G3, and olaratumab.
    More Information
    - Olaratumab (https://www.cancer.gov/about-cancer/treatment/drugs/olaratumab)
  laryngeal: (luh-RIN-jee-ul)
    Pronunciation of dictionary term "laryngeal"
    Having to do with the larynx.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Laryngeal cancer forms in the tissues of the larynx (area of the throat that contains the vocal cords). The larynx includes the supraglottis, glottis (vocal cords), and subglottis. The cancer may spread to nearby tissues or to the thyroid, trachea, or esophagus. It may also spread to the lymph nodes in the neck, the carotid artery, the upper part of the spinal column, the chest, and to other parts of the body (not shown).
    Drawing shows areas where laryngeal cancer may form or spread, including the supraglottis, glottis (vocal cords), subglottis, thyroid, trachea, and esophagus. Also shown are the epiglottis, the upper part of the spinal column, the carotid artery, the cartilage around the thyroid and trachea, lymph nodes in the neck, and the chest.
  laryngeal cancer: (luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "laryngeal cancer"
    Cancer that forms in tissues of the larynx. The larynx is the area of the throat that contains the vocal cords and is used for breathing, swallowing, and talking. Most laryngeal cancers are squamous cell carcinomas (cancers that begin in thin, flat cells that look like fish scales under a microscope).
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Laryngeal cancer forms in the tissues of the larynx (area of the throat that contains the vocal cords). The larynx includes the supraglottis, glottis (vocal cords), and subglottis. The cancer may spread to nearby tissues or to the thyroid, trachea, or esophagus. It may also spread to the lymph nodes in the neck, the carotid artery, the upper part of the spinal column, the chest, and to other parts of the body (not shown).
    Drawing shows areas where laryngeal cancer may form or spread, including the supraglottis, glottis (vocal cords), subglottis, thyroid, trachea, and esophagus. Also shown are the epiglottis, the upper part of the spinal column, the carotid artery, the cartilage around the thyroid and trachea, lymph nodes in the neck, and the chest.
  laryngectomee: (LAYR-in-JEK-toh-MEE)
    Pronunciation of dictionary term "laryngectomee"
    A person whose larynx (voice box) has been removed.
  laryngectomy: (LAYR-in-JEK-toh-mee)
    Pronunciation of dictionary term "laryngectomy"
    An operation to remove all or part of the larynx (voice box).
  laryngitis: (LAYR-in-JY-tis)
    Pronunciation of dictionary term "laryngitis"
    Inflammation of the larynx.
  laryngopharyngectomy: (luh-RIN-goh-fayr-in-JEK-toh-mee)
    Pronunciation of dictionary term "laryngopharyngectomy"
    Surgery to remove all or part of the larynx (voice box) and pharynx (throat). Part of the esophagus and all or part of the thyroid may also be removed. A laryngopharyngectomy is usually done to treat cancer in the hypopharynx (bottom part of the throat).
  laryngoscope: (luh-RIN-goh-SKOPE)
    Pronunciation of dictionary term "laryngoscope"
    A thin, tube-like instrument used to examine the larynx (voice box). A laryngoscope has a light and a lens for viewing and may have a tool to remove tissue.
  laryngoscopy: (LAYR-in-GOS-koh-pee)
    Pronunciation of dictionary term "laryngoscopy"
    Examination of the larynx (voice box) with a mirror (indirect laryngoscopy) or with a laryngoscope (direct laryngoscopy).
  larynx: (LAYR-inx)
    Pronunciation of dictionary term "larynx"
    The area of the throat containing the vocal cords and used for breathing, swallowing, and talking. Also called voice box.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Laryngeal cancer forms in the tissues of the larynx (area of the throat that contains the vocal cords). The larynx includes the supraglottis, glottis (vocal cords), and subglottis. The cancer may spread to nearby tissues or to the thyroid, trachea, or esophagus. It may also spread to the lymph nodes in the neck, the carotid artery, the upper part of the spinal column, the chest, and to other parts of the body (not shown).
    Drawing shows areas where laryngeal cancer may form or spread, including the supraglottis, glottis (vocal cords), subglottis, thyroid, trachea, and esophagus. Also shown are the epiglottis, the upper part of the spinal column, the carotid artery, the cartilage around the thyroid and trachea, lymph nodes in the neck, and the chest.
  laser: (LAY-zer)
    Pronunciation of dictionary term "laser"
    A device that forms light into intense, narrow beams that may be used to cut or destroy tissue, such as cancer tissue. It may also be used to reduce lymphedema (swelling caused by a buildup of lymph fluid in tissue) after breast cancer surgery. Lasers are used in microsurgery, photodynamic therapy, and many other procedures to diagnose and treat disease.
    More Information
    - Lasers to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/lasers)
  laser acupuncture: (LAY-zer AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "laser acupuncture"
    The use of a low-level laser beam instead of an acupuncture needle to stimulate an acupuncture point.
  laser interstitial thermal therapy: (LAY-zer IN-ter-STIH-shul THER-mul THAYR-uh-pee)
    Pronunciation of dictionary term "laser interstitial thermal therapy"
    A type of treatment that uses heat created by a laser beam to remove or destroy abnormal tissue, such as cancer tissue. During laser interstitial thermal therapy, an imaging test, such as MRI, is used to help guide a wire or catheter (thin tube) into the abnormal area of tissue. A laser inserted through the catheter creates heat, which destroys the abnormal tissue. Laser interstitial thermal therapy may be used to treat certain types of brain tumors, including tumors that have spread to the brain from other parts of the body, radiation necrosis (tissue death caused by radiation therapy), and some types of epilepsy. Also called LITT.
  laser surgery: (LAY-zer SER-juh-ree)
    Pronunciation of dictionary term "laser surgery"
    A surgical procedure that uses the cutting power of a laser beam to make bloodless cuts in tissue or to remove a surface lesion such as a tumor.
    More Information
    - Lasers to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/lasers)
  laser therapy: (LAY-zer THAYR-uh-pee)
    Pronunciation of dictionary term "laser therapy"
    Treatment that uses intense, narrow beams of light to cut and destroy tissue, such as cancer tissue. Laser therapy may also be used to reduce lymphedema (swelling caused by a buildup of lymph fluid in tissue) after breast cancer surgery.
    More Information
    - Lasers to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/lasers-fact-sheet)
    Laser treatment uses an intense, narrow beam of light to remove or destroy abnormal tissue. It is often used to treat precancers on the surface of the body, such as actinic keratosis, and may be used to treat some types of skin cancer.
    Laser treatment for skin cancer; drawing shows a gloved hand holding an instrument with a laser light over a small area on the lower arm of a patient.
  lassitude: (LA-sih-tood)
    Pronunciation of dictionary term "lassitude"
    A feeling of tiredness, weakness, and lack of interest in daily activities.
  late effect: (layt eh-FEKT)
    Pronunciation of dictionary term "late effect"
    A health problem that occurs months or years after a disease is diagnosed or after treatment has ended. Late effects may be caused by cancer or cancer treatment. They may include physical, mental, and social problems and second cancers.
    More Information
    - Late Effects of Cancer Treatment (https://www.cancer.gov/about-cancer/coping/survivorship/late-effects)
    - Late Effects of Treatment for Childhood Cancer
  late-stage cancer: (LAYT-stayj KAN-ser)
    Pronunciation of dictionary term "late-stage cancer"
    A term used to describe cancer that is far along in its growth, and has spread to the lymph nodes or other places in the body.
  latency period: (LAY-ten-see PEER-ee-ud)
    Pronunciation of dictionary term "latency period"
    The time that passes between being exposed to something that can cause disease (such as radiation or a virus) and having symptoms.
  latent: (LAY-tent)
    Pronunciation of dictionary term "latent"
    Describes a condition that is present but not active or causing symptoms.
  Latisse: (LA-tees)
    Pronunciation of dictionary term "Latisse"
    The drug bimatoprost used to increase the length, thickness, and darkness of eyelashes. It is being studied as a way to increase the growth of eyelashes and eyebrows in patients given chemotherapy for cancer. A sterile brush is used to apply Latisse on the upper and lower margins of the eyelids once a day.
  latissimus dorsi flap: (luh-TIH-sih-mus DOR-sy …)
    Pronunciation of dictionary term "latissimus dorsi flap"
    A type of surgery used to rebuild the shape of the breast after a mastectomy. A muscle in the back called the latissimus dorsi, along with skin, fat, and blood vessels, is moved from the back to the chest to form a new breast mound or to form a pocket for a breast implant. This is usually done by passing the muscle tissue and blood vessels through a tunnel under the skin to the chest. A latissimus dorsi flap is a type of breast reconstruction.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  laughter therapy: (LAF-ter THAYR-uh-pee)
    Pronunciation of dictionary term "laughter therapy"
    A type of therapy that uses humor to help relieve pain and stress and improve a person’s sense of well-being. It may be used to help people cope with a serious disease, such as cancer. Laughter therapy may include laughter exercises, clowns, and comedy movies, books, games, and puzzles. It is a type of complementary therapy. Also called humor therapy.
  lavage: (luh-VAZH)
    Pronunciation of dictionary term "lavage"
    In medicine, washing out an organ (such as the stomach or colon), a body cavity, or a wound by flushing it with a fluid. Also called irrigation.
  lavender: (LA-ven-der)
    Pronunciation of dictionary term "lavender"
    A plant with aromatic leaves and flowers that is a member of the mint family. Oil from the flowers has been used in some cultures to treat certain medical problems, to keep insects away, and to wash in. It is also used in aromatherapy. Perillyl alcohol, a substance found in lavender, is being studied in cancer prevention and treatment. The scientific name is Lavandula angustifolia. Also called English lavender and true lavender.
  laxative: (LAK-suh-tiv)
    Pronunciation of dictionary term "laxative"
    A substance that promotes bowel movements.
  Lazcluze: (laz-KLOOZ)
    Pronunciation of dictionary term "Lazcluze"
    A drug used with amivantamab to treat adults with non-small cell lung cancer that has spread to other parts of the body or cannot be removed by surgery and has certain mutations (changes) in the EGFR gene. Lazcluze blocks certain proteins made by the mutated EGFR gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called lazertinib mesylate hydrate.
    More Information
    - Lazertinib Mesylate Hydrate (https://www.cancer.gov/about-cancer/treatment/drugs/lazertinib-mesylate-hydrate)
  lazertinib mesylate hydrate: (la-ZER-tih-nib MEH-zih-layt HY-drayt)
    Pronunciation of dictionary term "lazertinib mesylate hydrate"
    A drug used with amivantamab to treat adults with non-small cell lung cancer that has spread to other parts of the body or cannot be removed by surgery and has certain mutations (changes) in the EGFR gene. Lazertinib mesylate hydrate blocks certain proteins made by the mutated EGFR gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Lazcluze.
    More Information
    - Lazertinib Mesylate Hydrate (https://www.cancer.gov/about-cancer/treatment/drugs/lazertinib-mesylate-hydrate)
  LBH589: A drug used with bortezomib and dexamethasone to treat multiple myeloma. It is used in patients whose cancer has already been treated with at least two other therapies, including bortezomib and an immunomodulating agent. It is also being studied in the treatment of other types of cancer. LBH589 blocks certain enzymes, which may help keep cancer cells from growing and dividing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. LBH589 is a type of histone deacetylase inhibitor and a type of antiangiogenesis agent. Also called Farydak and panobinostat lactate.
    More Information
    - Panobinostat Lactate (https://www.cancer.gov/about-cancer/treatment/drugs/panobinostat)
  LC-MS: A laboratory technique that combines two different processes to separate, identify, and measure the amount of different substances in a liquid sample. In the liquid chromatography (LC) part of the process, a liquid sample is passed through a column filled with a material that separates the different substances in the sample. In the mass spectrometry (MS) part of the process, the separated substances then pass through a special machine that reports the molecular weight, structure, identity, and number of different substances in the sample. LC-MS has many uses, including screening for drugs, identifying toxins in the environment, and detecting certain metabolic disorders in infants. Also called liquid chromatography–mass spectrometry.
  LCH: A group of rare disorders in which too many Langerhans cells (a type of white blood cell) grow in certain tissues and organs including the bones, skin, and lungs, and damage them. LCH may also affect the pituitary gland (which makes hormones that control other glands and many body functions, especially growth). LCH is most common in children and young adults. Also called Langerhans cell histiocytosis.
    More Information
    - Langerhans cell histiocytosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6858/langerhans-cell-histiocytosis)
    - Langerhans cell histiocytosis (MedlinePlus) (https://medlineplus.gov/genetics/condition/langerhans-cell-histiocytosis/)
    - Langerhans Cell Histiocytosis Treatment
  LCIS: A condition in which abnormal cells are found in the lobules of the breast. This condition seldom becomes invasive cancer. However, having LCIS in one breast increases the risk of developing breast cancer in either breast. Also called lobular carcinoma in situ.
    Lobular carcinoma in situ (LCIS). Abnormal cells are found in the lobules of the breast.
    Lobular carcinoma in situ (LCIS); drawing shows a lobe, ducts, lobules, and fatty tissue in a cross section of the breast. Three separate pullouts show a normal lobe, a normal lobule, and a lobule with abnormal cells.
  LDCT: A procedure that uses a computer linked to an x-ray machine that gives off a very low dose of radiation to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. LDCT is recommended as a screening test for adults who have a high risk of developing lung cancer based on their age and smoking history. Also called low-dose computed tomography and low-dose CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  LDE225: A drug used to treat locally advanced basal cell carcinoma (BCC) that has come back after surgery or radiation therapy. It is also used in patients who cannot be treated with surgery or radiation therapy. LDE225 is also being studied in the treatment of other types of cancer. LDE225 blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of hedgehog signaling pathway antagonist. Also called erismodegib, Odomzo, and sonidegib phosphate.
    More Information
    - Sonidegib (https://www.cancer.gov/about-cancer/treatment/drugs/sonidegib)
  LDH: One of a group of enzymes found in the blood and other body tissues, and involved in energy production in cells. An increased amount in the blood may be a sign of tissue damage and some types of cancer or other diseases. Also called lactate dehydrogenase and lactic acid dehydrogenase.
  lead compound: (leed KOM-pownd)
    Pronunciation of dictionary term "lead compound"
    In medicine, a chemical compound that shows promise as a treatment for a disease and may lead to the development of a new drug. Thousands of compounds are tested in the laboratory to find a lead (“leading”) compound that may act on specific genes or proteins involved in a disease. Once a lead compound has been found, the chemical structure is used as a starting point to make a drug that has the most benefits and the least harms. Finding a lead compound is the first step in making a new drug to treat a disease.
  lead shield: (led sheeld)
    Pronunciation of dictionary term "lead shield"
    In medicine, a protective shield that may be placed on the outside of the body during radiation therapy or certain imaging procedures, such as mammography. This helps protect organs, such as the thyroid or reproductive organs (including the ovaries, fallopian tubes, and uterus in females and the testicles, prostate, and penis in males), from damage caused by radiation.
  lectin: (LEK-tin)
    Pronunciation of dictionary term "lectin"
    A complex molecule that has both protein and sugars. Lectins are able to bind to the outside of a cell and cause biochemical changes in it. Lectins are made by both animals and plants.
  LED therapy: (...THAYR-uh-pee)
    Pronunciation of dictionary term "LED therapy"
    Treatment with drugs that become active and may kill cancer cells when exposed to light. LED therapy is a type of photodynamic therapy, which uses a special type of light to activate the drug. Also called light-emitting diode therapy.
  LEEP: A technique that uses electric current passed through a thin wire loop to remove abnormal tissue. Also called loop electrosurgical excision procedure and loop excision.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  leflunomide: (leh-FLOO-noh-mide)
    Pronunciation of dictionary term "leflunomide"
    An anticancer drug that works by inhibiting a cancer cell growth factor. Also called SU101.
  legal aid organization: (LEE-gul ayd OR-guh-nih-ZAY-shun)
    Pronunciation of dictionary term "legal aid organization"
    A group or agency that gives legal help to some people with low incomes. Health legal aid organizations help people with problems related to accessing health care services and obtaining health insurance coverage.
  Legius syndrome: (LEE-jus SIN-drome)
    Pronunciation of dictionary term "Legius syndrome"
    A rare genetic condition marked by flat brown spots on the skin. The number of brown spots on the skin tends to increase throughout childhood. Other signs and symptoms include an abnormally large head, unusual facial features, and freckling in the armpits and groin. People with this syndrome may have mild learning and developmental delays. Legius syndrome is a type of disease called a RASopathy that is caused by mutations (changes) in the SPRED1 gene. This gene makes a protein involved in a cell signaling pathway that controls many important cell functions. Also called neurofibromatosis type 1-like syndrome.
  leiomyoma: (LY-oh-my-OH-muh)
    Pronunciation of dictionary term "leiomyoma"
    A benign smooth muscle tumor, usually in the uterus or gastrointestinal tract. Also called fibroid.
  leiomyosarcoma: (LY-oh-MY-oh-sar-KOH-muh)
    Pronunciation of dictionary term "leiomyosarcoma"
    A malignant (cancer) tumor of smooth muscle cells that can arise almost anywhere in the body, but is most common in the uterus, abdomen, or pelvis.
  lemon: (LEH-mun)
    Pronunciation of dictionary term "lemon"
    A small, yellow citrus fruit that is a source of citric acid and ascorbic acid (vitamin C). The juice is used to flavor food and drink and to prevent scurvy. Lemon oil (scented liquid taken from the peel) is used in aromatherapy. The scientific name of the lemon tree is Citrus limon.
  lenalidomide: (leh-nuh-LIH-doh-mide)
    Pronunciation of dictionary term "lenalidomide"
    A drug that is similar to thalidomide and is used alone or with other drugs to treat adults with certain types of follicular lymphoma, marginal zone lymphoma, mantle cell lymphoma, multiple myeloma, or anemia caused by certain types of myelodysplastic syndromes. It is also being studied in the treatment of other conditions and types of cancer. Lenalidomide may help the immune system kill abnormal blood cells or cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. Lenalidomide is a type of antiangiogenesis agent and a type of immunomodulating agent. Also called CC-5013 and Revlimid.
    More Information
    - Lenalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/lenalidomide)
  lens: (lenz)
    Pronunciation of dictionary term "lens"
    A clear disk that focuses light, as in a camera or microscope. In the eye, the lens is a clear, curved structure at the front of the eye behind the pupil. It focuses light rays that enter the eye through the pupil, making an image on the retina (light-sensitive layers of nerve tissue at the back of the eye).
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  lentinan: (LEN-tih-nun)
    Pronunciation of dictionary term "lentinan"
    A beta-glucan (a type of polysaccharide) from the mushroom Lentinus edodes (shiitake mushroom). It has been studied in Japan as a treatment for cancer.
  lenvatinib mesylate: (len-VA-tih-nib MEH-zih-layt)
    Pronunciation of dictionary term "lenvatinib mesylate"
    A drug used alone or with other drugs to treat certain types of endometrial cancer, renal cell carcinoma (a type of kidney cancer), hepatocellular carcinoma (a type of liver cancer), and thyroid cancer. It is also being studied in the treatment of other types of cancer. Lenvatinib mesylate blocks certain proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Lenvatinib mesylate is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Lenvima.
    More Information
    - Lenvatinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/lenvatinibmesylate)
  Lenvima: (len-VEE-muh)
    Pronunciation of dictionary term "Lenvima"
    A drug used alone or with other drugs to treat certain types of endometrial cancer, renal cell carcinoma (a type of kidney cancer), hepatocellular carcinoma (a type of liver cancer), and thyroid cancer. It is also being studied in the treatment of other types of cancer. Lenvima blocks certain proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Lenvima is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called lenvatinib mesylate.
    More Information
    - Lenvatinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/lenvatinibmesylate)
  LEP-ETU: A form of the anticancer drug paclitaxel that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of several types of cancer. LEP-ETU blocks the ability of cells to divide and may kill cancer cells. It is a type of mitotic inhibitor and a type of antimicrotubule agent. Also called liposomal paclitaxel, LipoTaxen, paclitaxel liposome, and PNU-93914.
  lepirudin: (LEH-pih-ROO-din)
    Pronunciation of dictionary term "lepirudin"
    A drug that inhibits blood clotting. It is being studied in cancer treatment.
  leptin: (LEP-tin)
    Pronunciation of dictionary term "leptin"
    A hormone made by fat cells that helps control the feeling of hunger, the amount of fat stored in the body, and body weight.
  leptomeningeal: (LEP-toh-meh-NIN-jee-ul)
    Pronunciation of dictionary term "leptomeningeal"
    Having to do with the two innermost meninges (thin layers of tissue that cover and protect the brain and spinal cord).
  leptomeningeal carcinoma: (LEP-toh-meh-NIN-jee-ul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "leptomeningeal carcinoma"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Leptomeningeal carcinoma can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called carcinomatous meningitis, leptomeningeal carcinomatosis, leptomeningeal metastasis, meningeal carcinomatosis, meningeal metastasis, and neoplastic meningitis.
  leptomeningeal carcinomatosis: (LEP-toh-meh-NIN-jee-ul KAR-sih-NOH-muh-TOH-sis)
    Pronunciation of dictionary term "leptomeningeal carcinomatosis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Leptomeningeal carcinomatosis can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called carcinomatous meningitis, leptomeningeal carcinoma, leptomeningeal metastasis, meningeal carcinomatosis, meningeal metastasis, and neoplastic meningitis.
  leptomeningeal metastasis: (LEP-toh-meh-NIN-jee-ul meh-TAS-tuh-sis)
    Pronunciation of dictionary term "leptomeningeal metastasis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Leptomeningeal metastasis can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called carcinomatous meningitis, leptomeningeal carcinoma, leptomeningeal carcinomatosis, meningeal carcinomatosis, meningeal metastasis, and neoplastic meningitis.
  leridistim: (leh-RIH-dih-stim)
    Pronunciation of dictionary term "leridistim"
    A substance being studied for its ability to stimulate the production of blood cells during chemotherapy. It is a type of colony-stimulating factor. Also called SC-70935.
  lesion: (LEE-zhun)
    Pronunciation of dictionary term "lesion"
    An area of abnormal or damaged tissue caused by injury, infection, or disease. A lesion can occur anywhere in or on the body, such as the skin, blood vessels, brain, and other organs. Examples of lesions include wounds, ulcers, abscesses, sores, cysts, and tumors. A lesion may be benign (not cancer) or malignant (cancer).
  lestaurtinib: (leh-STOR-tih-nib)
    Pronunciation of dictionary term "lestaurtinib"
    A drug being studied in the treatment of acute leukemias and some other types of cancer. It binds to a protein that is present on the surface of some types of cancer cells and stops them from dividing. Lestaurtinib is a type of receptor tyrosine kinase inhibitor and a type of indolocarbazole alkaloid. Also called CEP-701.
  lethargy: (LEH-thur-jee)
    Pronunciation of dictionary term "lethargy"
    A condition marked by drowsiness and an unusual lack of energy and mental alertness. It can be caused by many things, including illness, injury, or drugs.
  letrozole: (LEH-truh-zole)
    Pronunciation of dictionary term "letrozole"
    A drug used to treat certain types of breast cancer in postmenopausal women. It is also being studied in the treatment of other types of cancer. Letrozole lowers the amount of estrogen made by the body. This may stop the growth of cancer cells that need estrogen to grow. Letrozole is a type of aromatase inhibitor. Also called Femara.
    More Information
    - Letrozole (https://www.cancer.gov/about-cancer/treatment/drugs/letrozole)
  leucovorin: (LOO-koh-VOR-in)
    Pronunciation of dictionary term "leucovorin"
    The active ingredient in a drug used to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. It is also used to treat some types of anemia and is used with fluorouracil to treat advanced colorectal cancer. It is also being studied in the treatment of other conditions and types of cancer. Leucovorin is a form of folic acid. It is a type of chemoprotective agent and a type of chemosensitizing agent.
  leucovorin calcium: (LOO-koh-VOR-in KAL-see-um)
    Pronunciation of dictionary term "leucovorin calcium"
    A form of folic acid used alone or with other drugs to treat certain types of colorectal cancer and anemia and to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. Leucovorin calcium is also being studied in the treatment of other conditions and types of cancer. It is a type of chemoprotective agent and a type of chemosensitizing agent. Leucovorin is the active ingredient of leucovorin calcium. Also called citrovorum factor and folinic acid.
    More Information
    - Leucovorin Calcium (https://www.cancer.gov/about-cancer/treatment/drugs/leucovorincalcium)
  leukapheresis: (LOO-kuh-feh-REE-sis)
    Pronunciation of dictionary term "leukapheresis"
    Removal of the blood to collect specific blood cells. The remaining blood is returned to the body.
  leukemia: (loo-KEE-mee-uh)
    Pronunciation of dictionary term "leukemia"
    Cancer that starts in blood-forming tissue, such as the bone marrow, and causes large numbers of abnormal blood cells to be produced and enter the bloodstream.
    More Information
    - Leukemia (https://www.cancer.gov/types/leukemia)
  leukemia cell: (loo-KEE-mee-uh sel)
    Pronunciation of dictionary term "leukemia cell"
    An abnormal type of white blood cell that builds up in the bone marrow and blood of patients with leukemia, causing there to be less room for healthy blood cells. This can cause infection, anemia, and easy bleeding. Leukemia cells may also collect in the lymph nodes, spleen, and liver and cause them to swell. They may also spread to the brain, spinal cord, and testicles.
  leukemic leptomeningitis: (loo-KEE-mik MEH-nin-JY-tis)
    Pronunciation of dictionary term "leukemic leptomeningitis"
    A serious problem that may occur in leukemia. In leukemic leptomeningitis, cancer cells have spread from the original (primary) tumor to the meninges (thin layers of tissue that cover and protect the brain and spinal cord). The cancer may cause the meninges to be inflamed. Also called leukemic meningitis and meningeal leukemia.
  leukemic meningitis: (loo-KEE-mik MEH-nin-JY-tis)
    Pronunciation of dictionary term "leukemic meningitis"
    A serious problem that may occur in leukemia. In leukemic meningitis, cancer cells have spread from the original (primary) tumor to the meninges (thin layers of tissue that cover and protect the brain and spinal cord). The cancer may cause the meninges to be inflamed. Also called leukemic leptomeningitis and meningeal leukemia.
  Leukeran: (LOO-keh-run)
    Pronunciation of dictionary term "Leukeran"
    A drug used to treat chronic lymphocytic leukemia, Hodgkin lymphoma, and certain types of non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Leukeran damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called chlorambucil.
    More Information
    - Chlorambucil (https://www.cancer.gov/about-cancer/treatment/drugs/chlorambucil)
  leukocyte: (LOO-koh-site)
    Pronunciation of dictionary term "leukocyte"
    A type of blood cell that is made in the bone marrow and found in the blood and lymph tissue. Leukocytes are part of the body’s immune system. They help the body fight infection and other diseases. Types of leukocytes are granulocytes (neutrophils, eosinophils, and basophils), monocytes, and lymphocytes (T cells and B cells). Checking the number of leukocytes in the blood is usually part of a complete blood cell (CBC) test. It may be used to look for conditions such as infection, inflammation, allergies, and leukemia. Also called WBC and white blood cell.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  leukopenia: (LOO-koh-PEE-nee-uh)
    Pronunciation of dictionary term "leukopenia"
    A condition in which there is a lower-than-normal number of leukocytes (white blood cells) in the blood.
  leukoplakia: (LOO-koh-PLAY-kee-uh)
    Pronunciation of dictionary term "leukoplakia"
    An abnormal patch of white or gray tissue that usually forms on the inside of the mouth, especially on the gums, tongue, inside of the cheek, and under the tongue. The patch does not come off when scraped. Leukoplakia is most commonly caused by smoking or chewing tobacco, but may also be caused by heavy alcohol use, poorly fitting dentures, or jagged, broken, or sharp teeth that rub against the tissues in the mouth. Most leukoplakias are benign (not cancer), but some may be precancerous or an early sign of cancer.
  leuprolide acetate: (LOO-proh-lide A-seh-tayt)
    Pronunciation of dictionary term "leuprolide acetate"
    A drug used under the brand names Eligard and Lupron Depot to treat prostate cancer and under the brand name Lupron Depot to treat problems with the endometrium (lining of the uterus) and uterine fibroids (noncancerous growths of the uterus) . It is also being studied in the treatment of other conditions and types of cancer. Leuprolide acetate initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men and estrogen levels in women. With continued use, leuprolide acetate lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in men and estrogen levels in women. Leuprolide acetate may stop the growth of cancer cells that need testosterone to grow and stop the growth of endometrial tissue and uterine fibroids. It is a type of hormone therapy called a gonadotropin-releasing hormone (GnRH) agonist. Also called Eligard and Lupron Depot.
    More Information
    - Leuprolide Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/leuprolideacetate)
  leuprolide mesylate: (LOO-proh-lide MEH-zih-layt)
    Pronunciation of dictionary term "leuprolide mesylate"
    A drug used to treat adults with advanced prostate cancer. Leuprolide mesylate initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men. With continued use, leuprolide mesylate lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels. Leuprolide mesylate may stop the growth of cancer cells that need testosterone to grow. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist. Also called Camcevi.
    More Information
    - Leuprolide Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/leuprolide-mesylate)
  Leustatin: (loo-STA-tin)
    Pronunciation of dictionary term "Leustatin"
    A drug used to treat hairy cell leukemia. It is also being studied in the treatment of other types of cancer. Leustatin damages the cell’s DNA and may kill cancer cells. It is a type of antimetabolite. Also called cladribine.
  leuvectin: (loo-VEK-tin)
    Pronunciation of dictionary term "leuvectin"
    An agent that delivers the gene for interleukin-2 (IL-2) into cells to increase production of IL-2 by the cells.
  levamisole: (lee-VA-mih-sole)
    Pronunciation of dictionary term "levamisole"
    An antiparasitic drug that is also being studied in cancer therapy with fluorouracil.
  levels of evidence: (LEH-vulz ... EH-vih-dents)
    Pronunciation of dictionary term "levels of evidence"
    A ranking system used to describe the strength of the results measured in a clinical trial or research study. The design of the study (such as a case report for an individual patient or a randomized double-blinded controlled clinical trial) and the endpoints measured (such as survival or quality of life) affect the strength of the evidence.
  levetiracetam: (LEE-veh-ty-RA-seh-tam)
    Pronunciation of dictionary term "levetiracetam"
    A drug used to treat seizures (involuntary muscle movements) caused by epilepsy (a group of brain disorders). Levetiracetam is being studied in the treatment of seizures in patients with cancer that has spread to the brain. It is a type of anticonvulsant. Also called Keppra.
  levocarnitine: (LEE-voh-KAR-nih-teen)
    Pronunciation of dictionary term "levocarnitine"
    A form of carnitine, which is a substance made in muscle and liver tissue and found in certain foods, such as meat, poultry, fish, and some dairy products. Levocarnitine is also a drug that is used to treat patients who do not make enough carnitine and is being studied as a way to prevent tissue damage caused by chemotherapy. Carnitine is a type of dietary supplement. Also called Carnitor and L-carnitine.
  levofloxacin: (LEE-voh-FLOK-suh-sin)
    Pronunciation of dictionary term "levofloxacin"
    A substance used to treat bacterial infections. It belongs to the family of drugs called quinolone antibiotics.
  levoleucovorin calcium: (LEE-voh-LOO-koh-VOR-in KAL-see-um)
    Pronunciation of dictionary term "levoleucovorin calcium"
    A drug used to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. It is also used with fluorouracil as palliative therapy to treat advanced colorectal cancer. Levoleucovorin calcium is a form of folic acid. It is a type of chemoprotective agent and a type of chemosensitizing agent. Also called Fusilev.
  levonorgestrel: (LEE-voh-nor-JES-trel)
    Pronunciation of dictionary term "levonorgestrel"
    A form of the hormone progesterone that is made in the laboratory and used to prevent pregnancy. It is being studied in the prevention of ovarian and endometrial cancer, and in the treatment of other conditions. Levonorgestrel is a type of oral contraceptive. Also called L-norgestrel and Plan B.
  Levulan: (LEH-vyoo-lan)
    Pronunciation of dictionary term "Levulan"
    A drug used to treat actinic keratosis (a skin condition that may become cancer). The drug is also being studied in the treatment of squamous cell and basal cell skin cancers and other types of cancer. When Levulan is taken up by cells, including cancer cells, and then exposed to certain types of light, it becomes active and kills the cells. It is a type of photosensitizing agent. Also called aminolevulinic acid hydrochloride and Levulan Kerastick.
  Levulan Kerastick: (LEH-vyoo-lan KAYR-uh-stik)
    Pronunciation of dictionary term "Levulan Kerastick"
    A drug that contains the active ingredient aminolevulinic acid hydrochloride and is used with photodynamic therapy to treat actinic keratosis (a skin condition that may become cancer). When Levulan Kerastick is taken up by abnormal cells, including cancer cells, and then exposed to certain types of light, it becomes active and kills the cells. Levulan Kerastick is a type of photosensitizing agent.
    More Information
    - Aminolevulinic Acid Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/aminolevulinicacid)
  Lexapro: (LEK-suh-proh)
    Pronunciation of dictionary term "Lexapro"
    A drug used to treat depression and certain anxiety disorders. It belongs to the family of drugs called selective serotonin reuptake inhibitors (SSRIs). Also called escitalopram.
  lexatumumab: (lek-suh-TOO-moo-mab)
    Pronunciation of dictionary term "lexatumumab"
    A substance being studied in the treatment of some types of cancer. It binds to a protein called TRAIL-R2 on the surface of some tumor cells, which may kill the tumor cells. Lexatumumab is a type of monoclonal antibody. Also called anti-TRAIL R2 mAb HGS-ETR2 and HGS-ETR2.
  Leydig cell tumor: (LY-dig sel TOO-mer)
    Pronunciation of dictionary term "Leydig cell tumor"
    A rare tumor that usually forms in the testicles. It may also form in the ovaries, but this is very rare. Leydig cell tumors make a male sex hormone called testosterone. These tumors can cause early puberty and an abnormal growth of breast tissue in males. In females, they can cause male features such as facial hair and a deep voice. Leydig cell tumors are usually benign (not cancer), but they may sometimes become malignant (cancer). Leydig cell tumors tend to have a good prognosis if diagnosed and treated early. They can occur in both adults and children. Leydig cell tumors are a type of sex cord-stromal tumor.
  LFS: A rare, inherited disorder that is caused by mutations (changes) in the TP53 gene. Having Li-Fraumeni syndrome increases the risk of developing many types of cancer. Cancers often develop at an early age, and more than one type of cancer may occur in the same person. LFS is a type of hereditary cancer syndrome. Also called Li-Fraumeni syndrome.
    More Information
    - Li-Fraumeni syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6902/li-fraumeni-syndrome)
    - Li-Fraumeni syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/li-fraumeni-syndrome/)
  LGD1069: A drug used to treat skin problems caused by cutaneous T-cell lymphoma that did not get better after other treatment. It is also being studied in the treatment of other types of cancer. LGD1069 binds to and activates proteins called retinoid X receptors, which may stop the growth of cancer cells and kill them. It is a type of retinoid. Also called bexarotene and Targretin.
    More Information
    - Bexarotene (https://www.cancer.gov/about-cancer/treatment/drugs/bexarotene)
  LH: A hormone made in the pituitary gland. In females, it acts on the ovaries to make follicles release their eggs and to make hormones that get the uterus ready for a fertilized egg to be implanted. In males, it acts on the testes to cause cells to grow and make testosterone. Also called interstitial cell-stimulating hormone, luteinizing hormone, and lutropin.
  LH-RH: A hormone made by a part of the brain called the hypothalamus. LH-RH causes the pituitary gland in the brain to make and secrete the hormones luteinizing hormone (LH) and follicle-stimulating hormone (FSH). In men, these hormones cause the testicles to make testosterone. In women, they cause the ovaries to make estrogen and progesterone. Also called GnRH, gonadotropin-releasing hormone, LHRH, and luteinizing hormone-releasing hormone.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  Lhermitte's sign: (layr-MEETZ ...)
    Pronunciation of dictionary term "Lhermitte's sign"
    A sensation similar to an electrical shock radiating from the back of the head down the spine as the neck is bent forward.
  LHRH: A hormone made by a part of the brain called the hypothalamus. LHRH causes the pituitary gland in the brain to make and secrete the hormones luteinizing hormone (LH) and follicle-stimulating hormone (FSH). In men, these hormones cause the testicles to make testosterone. In women, they cause the ovaries to make estrogen and progesterone. Also called GnRH, gonadotropin-releasing hormone, LH-RH, and luteinizing hormone-releasing hormone.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  LHRH agonist: (... A-guh-nist)
    Pronunciation of dictionary term "LHRH agonist"
    A substance that keeps the testicles and ovaries from making sex hormones by blocking other hormones that are needed to make them. In men, LHRH agonists cause the testicles to stop making testosterone. In women, they cause the ovaries to stop making estrogen and progesterone. Some LHRH agonists are used to treat prostate cancer. Also called GnRH agonist, GnRHa, gonadotropin-releasing hormone agonist, and luteinizing hormone-releasing hormone agonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  LHRH antagonist: (… an-TA-guh-nist)
    Pronunciation of dictionary term "LHRH antagonist"
    A substance that blocks the pituitary gland from making hormones called follicle-stimulating hormone (FSH) and luteinizing hormone (LH). In men, this causes the testicles to stop making testosterone. In women, this causes the ovaries to stop making estrogen and progesterone. Some LHRH antagonists are used to treat advanced prostate cancer. They are also used to treat certain gynecologic conditions and are being studied in the treatment of hormone-sensitive breast cancer. Also called GnRH antagonist, gonadotropin-releasing hormone antagonist, and luteinizing hormone-releasing hormone antagonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  Li-Fraumeni syndrome: (lee-FRAH-meh-nee SIN-drome)
    Pronunciation of dictionary term "Li-Fraumeni syndrome"
    A rare, inherited disorder that is caused by mutations (changes) in the TP53 gene. Having Li-Fraumeni syndrome increases the risk of developing many types of cancer. Cancers often develop at an early age, and more than one type of cancer may occur in the same person. Li-Fraumeni syndrome is a type of hereditary cancer syndrome. Also called LFS.
    More Information
    - Li-Fraumeni syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6902/li-fraumeni-syndrome)
    - Li-Fraumeni syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/li-fraumeni-syndrome/)
  liarozole: (lee-AYR-oh-zole)
    Pronunciation of dictionary term "liarozole"
    An anticancer drug that promotes differentiation by increasing the levels of retinoic acid within the tumor.
  libido: (lih-BEE-doh)
    Pronunciation of dictionary term "libido"
    Sexual desire or the mental energy or emotion related to sex.
  Libtayo: (lib-TY-oh)
    Pronunciation of dictionary term "Libtayo"
    A drug that binds to the protein PD-1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Libtayo is used to treat certain types of basal cell carcinoma and cutaneous squamous cell carcinoma (types of skin cancer) that are locally advanced or have spread to other parts of the body. It is also used alone or with other drugs to treat adults with non-small cell lung cancer that is locally advanced or has spread to other parts of the body and may have the PD-L1 protein, but does not have a mutation (change) in the EGFR, ALK, or ROS1 gene. It is also being studied in the treatment of other types of cancer. Libtayo may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called cemiplimab.
    More Information
    - Cemiplimab-rwlc (https://www.cancer.gov/about-cancer/treatment/drugs/cemiplimab-rwlc)
  licorice root extract: (LIH-kuh-rish … EK-strakt)
    Pronunciation of dictionary term "licorice root extract"
    A substance prepared from dried roots of the plant Glycyrrhiza glabra. It is used as a flavoring in medicines, drinks, and sweets, and it is being studied in the treatment of cancer. Licorice root extract contains several compounds that reduce inflammation, kill certain bacteria and viruses, act like estrogen and other hormones, and may cause cancer cells to die. It is a type of antioxidant.
  lidocaine: (LY-doh-kane)
    Pronunciation of dictionary term "lidocaine"
    A substance used to relieve pain by blocking signals at the nerve endings in skin. It can also be given intravenously to stop heart arrhythmias. It is a type of local anesthetic and antiarrhythmic.
  lifestyle risk factor: (... FAK-ter)
    Pronunciation of dictionary term "lifestyle risk factor"
    Personal behaviors or choices that can increase a person’s chance of developing a disease. Lifestyle risk factors can often be avoided, controlled, or changed to reduce the risk of certain diseases, such as cancer, diabetes, obesity, and heart disease. Some examples of lifestyle risk factors include cigarette smoking or other tobacco use, having an unhealthy diet, not getting enough exercise, and drinking too much alcohol.
    More Information
    - Risk Factors for Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk)
  lifetime risk: (LIFE-time risk)
    Pronunciation of dictionary term "lifetime risk"
    A measure of the risk that a certain event will happen during a person’s lifetime. In cancer research, it is usually given as the likelihood that a person who is free of a certain type of cancer will develop or die from that type of cancer during his or her lifetime. For example, a woman with no known risk factors for breast cancer has a lifetime risk of developing breast cancer of about 12%. This means one out of every eight women will develop breast cancer during her lifetime.
  lifileucel: (LIH-fih-LOO-sel)
    Pronunciation of dictionary term "lifileucel"
    A treatment used for adults with melanoma that has spread to other parts of the body or cannot be removed by surgery. It is used in patients whose cancer did not get better after treatment with an antibody that blocks PD-1 (and treatment with a BRAF inhibitor, for those with a BRAF mutation). It is also being studied in the treatment of other types of cancer. Lifileucel is made using tumor-infiltrating lymphocytes (a type of immune cell that can recognize and kill tumor cells) from a patient’s tumor. These lymphocytes are tested in the laboratory to find out which ones best recognize the tumor cells. The selected lymphocytes are then grown in large numbers in the laboratory and given back to the patient to help the immune system kill the tumor cells. Lifileucel is a type of cellular immunotherapy called tumor-infiltrating lymphocyte therapy. Also called Amtagvi.
    More Information
    - Lifileucel (https://www.cancer.gov/about-cancer/treatment/drugs/lifileucel)
  ligation: (ly-GAY-shun)
    Pronunciation of dictionary term "ligation"
    The process of tying off blood vessels so that blood cannot flow to a part of the body or to a tumor.
  light cigarette: (lite SIH-guh-ret)
    Pronunciation of dictionary term "light cigarette"
    A type of cigarette that is claimed to give off less tobacco tar than a regular cigarette when smoked. Light cigarettes have been shown to be no safer than regular cigarettes, and smoking them does not lower the risk of cancer or other diseases. A person smoking a light cigarette can inhale the same amount of tobacco tar, nicotine, and harmful, cancer-causing chemicals as in a regular cigarette, depending on how the cigarette is smoked. Cigarettes are no longer allowed to be labeled or advertised as light cigarettes. Also called low tar cigarette.
    More Information
    - "Light" Cigarettes and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/light-cigarettes-fact-sheet)
  light microscope: (lite MY-kroh-SKOPE)
    Pronunciation of dictionary term "light microscope"
    A microscope (device to magnify small objects) in which objects are lit directly by white light.
  light therapy: (… THAYR-uh-pee)
    Pronunciation of dictionary term "light therapy"
    The treatment of disease with certain types of light. Light therapy can use lasers, LED, fluorescent lamps, and ultraviolet or infrared radiation. Also called phototherapy.
  light-emitting diode therapy: (lite-ee-MIH-ting DY-ode THAYR-uh-pee)
    Pronunciation of dictionary term "light-emitting diode therapy"
    Treatment with drugs that become active and may kill cancer cells when exposed to light. Light-emitting diode therapy is type of photodynamic therapy which uses a special type of light to activate the drug. Also called LED therapy.
  lignan: (LIG-nun)
    Pronunciation of dictionary term "lignan"
    A member of a group of substances found in plants that have shown estrogenic and anticancer effects. Lignans have been used in some cultures to treat certain medical problems.
  limb perfusion: (lim per-FYOO-zhun)
    Pronunciation of dictionary term "limb perfusion"
    A procedure that may be used to deliver anticancer drugs directly to an arm or leg. The flow of blood to and from the limb is temporarily stopped with a tourniquet (a tight band around the limb), and anticancer drugs are put directly into the blood of the limb. This allows the person to receive a high dose of drugs in the area where the cancer occurred. Also called isolated limb perfusion.
  limb-salvage surgery: (lim-SAL-vij SER-juh-ree)
    Pronunciation of dictionary term "limb-salvage surgery"
    Surgery to remove a tumor in a limb (arm or leg) without removing the whole limb. The bone and tissue around the tumor may also be removed, and an implant may be used to replace the part of the limb removed. Limb-salvage surgery is done to help save the use and appearance of the limb. It is used to treat cancers of the bone and soft tissue. Also called limb-sparing surgery.
  limb-sparing surgery: (lim-SPAYR-ing SER-juh-ree)
    Pronunciation of dictionary term "limb-sparing surgery"
    Surgery to remove a tumor in a limb (arm or leg) without removing the whole limb. The bone and tissue around the tumor may also be removed, and an implant may be used to replace the part of the limb removed. Limb-sparing surgery is done to help save the use and appearance of the limb. It is used to treat cancers of the bone and soft tissue. Also called limb-salvage surgery.
  limbic system: (LIM-bik SIS-tem)
    Pronunciation of dictionary term "limbic system"
    A network of structures in the brain involved in memory and emotions.
  limited-stage small cell lung cancer: (LIH-mih-ted-stayj ... sel lung KAN-ser)
    Pronunciation of dictionary term "limited-stage small cell lung cancer"
    Cancer is found in one lung, the tissues between the lungs, and nearby lymph nodes only.
  LIN: A condition in which abnormal cells are found in the lobules (glands that make milk) of the breast. This condition rarely becomes cancer. However, having LIN in one breast increases the risk of breast cancer in either breast. Types of LIN include atypical lobular hyperplasia and lobular carcinoma in situ (LCIS). Also called lobular intraepithelial neoplasia and lobular neoplasia.
  linac: (LIH-nak)
    Pronunciation of dictionary term "linac"
    A machine that uses electricity to form a stream of fast-moving subatomic particles. This creates high-energy radiation that may be used to treat cancer. Also called linear accelerator, mega-voltage linear accelerator, and MeV linear accelerator.
  linear accelerator: (LIH-nee-er ak-SEH-leh-RAY-ter)
    Pronunciation of dictionary term "linear accelerator"
    A machine that uses electricity to form a stream of fast-moving subatomic particles. This creates high-energy radiation that may be used to treat cancer. Also called linac, mega-voltage linear accelerator, and MeV linear accelerator.
  linitis plastica: (lih-NY-tis plas-TIH-kuh)
    Pronunciation of dictionary term "linitis plastica"
    A rare type of stomach cancer that begins in the lining of the stomach and spreads to the muscles of the stomach wall. This causes the wall of the stomach to become thick, hard, and rubbery, which leads to trouble digesting food. Also called gastric scirrhous carcinoma.
  linseed: (LIN-seed)
    Pronunciation of dictionary term "linseed"
    The seed of the flax plant. It is a rich source of omega-3 fatty acid, fiber, and a compound called lignin. It is being studied in the prevention of several types of cancer. Also called flaxseed.
  lintuzumab: (lin-TOO-zoo-mab)
    Pronunciation of dictionary term "lintuzumab"
    A substance being studied in the treatment of myelodysplastic syndromes and some types of leukemia. It binds to CD33, a protein on the surface of certain normal blood stem cells and some abnormal blood cells. It causes the immune system to kill these cells. Lintuzumab is a type of monoclonal antibody. Also called MoAb HuM195 and monoclonal antibody HuM195.
  Lioresal: (lih-OR-eh-sal)
    Pronunciation of dictionary term "Lioresal"
    A drug that is used to treat certain types of muscle spasms and is being studied in the treatment of liver cancer. Lioresal relaxes muscles by blocking certain nerve receptors in the spinal cord. It is a type of antispasmodic. Also called baclofen and Kemstro.
  liothyronine sodium: (LY-oh-THY-roh-neen SOH-dee-um)
    Pronunciation of dictionary term "liothyronine sodium"
    A drug that is used to treat certain thyroid (a gland located near the voice box) conditions. It is also being studied in the treatment of thyroid cancer. Liothyronine sodium is made in the laboratory and is a form of the thyroid hormone triiodthyronine (T3). Also called Cytomel and Triostat.
  lipid: (LIH-pid)
    Pronunciation of dictionary term "lipid"
    Fat.
  Lipiodol: (LIH-pee-oh-dol)
    Pronunciation of dictionary term "Lipiodol"
    A form of poppy seed oil that contains iodine. Lipiodol is given by injection and builds up in the blood and lymph vessels in tumors. It is used for imaging (taking pictures) of the salivary glands and the lymph system. It is also being studied in the imaging of other organs such as the liver, lung, stomach, and thyroid. It is a type of diagnostic imaging agent. Also called ethiodized oil, Ethiodol, and iodized oil.
  Lipitor: (LIH-pih-tor)
    Pronunciation of dictionary term "Lipitor"
    A drug used to lower the amount of cholesterol in the blood and to prevent stroke, heart attack, and angina (chest pain). It is also being studied in the prevention and treatment of some types of cancer and other conditions. Lipitor blocks an enzyme that helps make cholesterol in the body. It also causes an increase in the breakdown of cholesterol. It is a type of HMG-CoA reductase inhibitor and a type of statin. Also called atorvastatin calcium.
  LipoDox: (LY-poh-DOX)
    Pronunciation of dictionary term "LipoDox"
    A form of the anticancer drug doxorubicin that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than doxorubicin. LipoDox is used to treat ovarian cancer, AIDS-related Kaposi sarcoma, and multiple myeloma in patients whose disease has not gotten better after treatment with other anticancer drugs. It may be used together with other anticancer drugs. It is also being studied in the treatment of other types of cancer. LipoDox is a type of anthracycline antitumor antibiotic. Also called Dox-SL, Doxil, doxorubicin hydrochloride liposome, Evacet, and liposomal doxorubicin hydrochloride.
    More Information
    - Doxorubicin Hydrochloride Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicin-hydrochloride-liposome)
  lipoma: (lih-POH-muh)
    Pronunciation of dictionary term "lipoma"
    A benign (not cancer) tumor made of fat cells.
  lipophilic: (LIH-poh-FIH-lik)
    Pronunciation of dictionary term "lipophilic"
    Able to dissolve, be dissolved in, or absorb lipids (fats).
  liposarcoma: (LIH-poh-sar-KOH-muh)
    Pronunciation of dictionary term "liposarcoma"
    A rare type of cancer that begins in fat cells. It usually forms in the layer of fat just under the skin or in the deep soft tissues of the legs (especially in the thigh or back of the knee) or in the abdomen. It may also form in other parts of the body. Most liposarcomas are painless and tend to grow slowly, but some may grow quickly and spread to nearby tissue or to other parts of the body. Liposarcomas usually occur in adults, and are rare in children and adolescents. They are a type of soft tissue sarcoma.
  liposomal: (LY-poh-SOH-mul)
    Pronunciation of dictionary term "liposomal"
    A drug preparation that contains the active drug inside very tiny, fat-like particles. This form is easier for the body to absorb and allows more drug to get to the target area of the body, such as a tumor. Liposomal drugs may have fewer side effects and work better than other forms of the drug.
  liposomal cytarabine: (LY-poh-SOH-mul sy-TAYR-uh-been)
    Pronunciation of dictionary term "liposomal cytarabine"
    A form of the anticancer drug cytarabine that is contained inside very tiny, fat-like particles. It may have fewer side effects and work better than cytarabine. It is used to treat lymphoma that has spread to the meninges (three thin layers of tissue that cover and protect the brain and spinal cord). It is also being studied in the treatment of other types of cancer. It is a type of antimetabolite. Also called cytarabine liposome and Depo-Cyt.
    More Information
    - Cytarabine Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabineliposome)
  liposomal doxorubicin hydrochloride: (LY-poh-SOH-mul DOK-soh-ROO-bih-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "liposomal doxorubicin hydrochloride"
    A form of the anticancer drug doxorubicin that is contained inside very tiny, fat-like particles and is used alone or with other drugs to treat certain types of ovarian cancer, AIDS-related Kaposi sarcoma, and multiple myeloma. Liposomal doxorubicin hydrochloride may have fewer side effects and work better than other forms of doxorubicin hydrochloride. It is also being studied in the treatment of other types of cancer. Liposomal doxorubicin hydrochloride is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called Doxil and doxorubicin hydrochloride liposome.
    More Information
    - Doxorubicin Hydrochloride Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicin-hydrochloride-liposome)
  liposomal paclitaxel: (LY-poh-SOH-mul PA-klih-TAK-sil)
    Pronunciation of dictionary term "liposomal paclitaxel"
    A form of the anticancer drug paclitaxel that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of several types of cancer. Liposomal paclitaxel blocks the ability of cells to divide and may kill cancer cells. It is a type of mitotic inhibitor and a type of antimicrotubule agent. Also called LEP-ETU, LipoTaxen, paclitaxel liposome, and PNU-93914.
  liposomal SN-38: (LY-poh-SOH-mul…)
    Pronunciation of dictionary term "liposomal SN-38"
    A form of the anticancer drug irinotecan that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than irinotecan alone. Liposomal SN-38 is being studied in the treatment of advanced colorectal cancer and other types of cancer. Liposomal SN-38 blocks the ability of cells to divide and grow. It may stop the growth of tumor cells. It is a type of topoisomerase inhibitor and a type of irinotecan (CPT-11) derivative. Also called SN-38 liposome.
  liposomal vincristine sulfate: (LY-poh-SOH-mul vin-KRIS-teen SUL-fayt)
    Pronunciation of dictionary term "liposomal vincristine sulfate"
    A form of the anticancer drug vincristine sulfate that is contained inside very tiny, fat-like particles and is used to treat adults with acute lymphoblastic leukemia that is Philadelphia chromosome negative and has come back or has not gotten better with other treatment. Liposomal vincristine sulfate may have fewer side effects and work better than other forms of vincristine sulfate. It is also being studied in the treatment of other types of cancer. Liposomal vincristine sulfate stops cancer cells from growing and dividing and may kill them. It is a type of vinca alkaloid. Also called Marqibo and vincristine sulfate liposome.
    More Information
    - Vincristine Sulfate Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/vincristine-sulfate-liposome)
  liposome: (LY-poh-some)
    Pronunciation of dictionary term "liposome"
    A very tiny, fat-like particle that is made in the laboratory. In medicine, liposomes containing drugs or other substances are used in the treatment of cancer and other diseases. Drugs given in liposomes may have fewer side effects and work better than the same drugs given alone.
  liposome-encapsulated doxorubicin citrate: (LY-poh-some-en-KAP-soo-lay-ted DOK-soh-ROO-bih-sin SIH-trayt)
    Pronunciation of dictionary term "liposome-encapsulated doxorubicin citrate"
    A form of the anticancer drug doxorubicin citrate that is contained inside very tiny, fat-like particles. It is being studied in the treatment of breast cancer that has spread and in the treatment of other types of cancer. Doxorubicin citrate damages DNA and may kill cancer cells. Liposomal-encapsulated doxorubicin citrate may have fewer side effects and may work better than doxorubicin citrate.
  liposome-encapsulated irinotecan hydrochloride PEP02: (LY-poh-some-en-KAP-soo-lay-ted I-rih-noh-TEE-kan HY-droh-KLOR-ide …)
    Pronunciation of dictionary term "liposome-encapsulated irinotecan hydrochloride PEP02"
    A form of the anticancer drug irinotecan hydrochloride that is contained inside very tiny, fat-like particles and is used with other drugs to treat adults with pancreatic cancer that has spread to other parts of the body. It is used in patients whose cancer has not been treated with other anticancer therapy or has gotten worse after treatment with gemcitabine hydrochloride. It is also being studied in the treatment of other types of cancer. Liposome-encapsulated irinotecan hydrochloride PEP02 may have fewer side effects and work better than other forms of irinotecan hydrochloride. Liposome-encapsulated irinotecan hydrochloride PEP02 blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called irinotecan sucrosofate, Onivyde, and PEP02.
    More Information
    - Irinotecan Sucrosofate (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecan-hydrochloride-liposome)
  liposuction: (LY-poh-SUK-shun)
    Pronunciation of dictionary term "liposuction"
    A surgical procedure in which a vacuum device is used to remove extra fat from the body. Liposuction is usually done to smooth and reshape an area of the body to improve appearance. It may also be done to remove lipomas (fatty tumors that are not cancer) and to treat gynecomastia (the abnormal growth of breast tissue in males). It may also be done to relieve symptoms of lymphedema (a condition in which extra lymph fluid builds up in tissues and causes swelling) and as part of breast reduction surgery.
  LipoTaxen: (LIH-poh-TAK-sen)
    Pronunciation of dictionary term "LipoTaxen"
    A form of the anticancer drug paclitaxel that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of several types of cancer. LipoTaxen blocks the ability of cells to divide and may kill cancer cells. It is a type of mitotic inhibitor and a type of antimicrotubule agent. Also called LEP-ETU, liposomal paclitaxel, paclitaxel liposome, and PNU-93914.
  liquid biopsy: (LIH-kwid BY-op-see)
    Pronunciation of dictionary term "liquid biopsy"
    A laboratory test done on a sample of blood, urine, or other body fluid to look for cancer cells from a tumor or small pieces of DNA, RNA, or other molecules released by tumor cells into a person’s body fluids. Liquid biopsy allows multiple samples to be taken over time, which may help doctors understand what kind of genetic or molecular changes are taking place in a tumor. A liquid biopsy may be used to help find cancer at an early stage. It may also be used to help plan treatment or to find out how well treatment is working or if cancer has come back.
  liquid chromatography–mass spectrometry: (LIH-kwid KROH-muh-TAH-gruh-fee-mas-spek-TRAH-meh-tree)
    Pronunciation of dictionary term "liquid chromatography–mass spectrometry"
    A laboratory technique that combines two different processes to separate, identify, and measure the amount of different substances in a liquid sample. In the liquid chromatography (LC) part of the process, a liquid sample is passed through a column filled with a material that separates the different substances in the sample. In the mass spectrometry (MS) part of the process, the separated substances then pass through a special machine that reports the molecular weight, structure, identity, and number of different substances in the sample. Liquid chromatography–mass spectrometry has many uses, including screening for drugs, identifying toxins in the environment, and detecting certain metabolic disorders in infants. Also called LC-MS.
  liquid-based Pap test: (LIH-kwid-bayst ...)
    Pronunciation of dictionary term "liquid-based Pap test"
    A type of Pap test. A Pap test is a procedure in which cells are scraped from the cervix for examination under a microscope. It is used to detect cancer or changes that may lead to cancer. A Pap test can also show conditions that are not cancer, such as infection or inflammation. In a liquid-based Pap test, the cells are rinsed into a small container of liquid. The cells are then placed onto slides by a special machine and examined under a microscope to see if the cells are abnormal.
  lisinopril: (ly-SIH-noh-pril)
    Pronunciation of dictionary term "lisinopril"
    A drug used to treat high blood pressure and certain heart conditions. It is also being studied in the prevention and treatment of side effects caused by some anticancer drugs. It blocks certain enzymes that cause blood vessels to constrict (narrow). It is a type of angiotensin-converting enzyme (ACE) inhibitor. Also called Prinivil and Zestril.
  lisocabtagene maraleucel: (LIH-soh-KAB-tuh-jeen MAR-uh-LOO-sel)
    Pronunciation of dictionary term "lisocabtagene maraleucel"
    A treatment used for adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, follicular lymphoma, mantle cell lymphoma, or certain types of large B-cell lymphoma that relapsed (came back) or did not get better after treatment with at least one or two lines of systemic therapy. It is also being studied in the treatment of other types of cancer. Lisocabtagene maraleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Lisocabtagene maraleucel binds to a protein called CD19, which is found on most B-cell lymphoma cells. This helps the body’s immune system kill cancer cells. Lisocabtagene maraleucel is a type of cellular immunotherapy called CAR T-cell therapy. Also called Breyanzi.
    More Information
    - Lisocabtagene Maraleucel (https://www.cancer.gov/about-cancer/treatment/drugs/lisocabtagenemaraleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  lisofylline: (lih-SAH-fuh-lin)
    Pronunciation of dictionary term "lisofylline"
    A drug that may protect healthy cells from chemotherapy and radiation without inhibiting the effects of these therapies on tumor cells.
  liter: (LEE-ter)
    Pronunciation of dictionary term "liter"
    A measure of volume for a liquid, using the metric system. One liter is equal to 1,000 cubic centimeters (cc), 1,000 milliliters (mL), or 1.0567 quarts (qt). Also called L.
  lithium: (LIH-thee-um)
    Pronunciation of dictionary term "lithium"
    A soft metal. Lithium salts are used to treat certain mental disorders, especially bipolar (manic depressive) disorder. Lithium salts include lithium carbonate and lithium citrate.
  LITT: A type of treatment that uses heat created by a laser beam to remove or destroy abnormal tissue, such as cancer tissue. During LITT, an imaging test, such as MRI, is used to help guide a wire or catheter (thin tube) into the abnormal area of tissue. A laser inserted through the catheter creates heat, which destroys the abnormal tissue. LITT may be used to treat certain types of brain tumors, including tumors that have spread to the brain from other parts of the body, radiation necrosis (tissue death caused by radiation therapy), and some types of epilepsy. Also called laser interstitial thermal therapy.
  live virus vaccine: (… VY-rus vak-SEEN)
    Pronunciation of dictionary term "live virus vaccine"
    A vaccine made from a virus that has been weakened so it does not cause the disease the virus usually causes. A live virus vaccine helps the body’s immune system recognize and fight infections caused by the non-weakened form of the virus. Examples of live virus vaccines are the chickenpox vaccine and the measles, mumps, and rubella (MMR) vaccine. It is not safe for pregnant women or people with weak immune systems to receive a live virus vaccine.
  liver: (LIH-ver)
    Pronunciation of dictionary term "liver"
    A large organ located in the upper abdomen. The liver cleanses the blood and aids in digestion by secreting bile.
    More Information
    - Liver and Bile Duct Cancer (https://www.cancer.gov/types/liver)
    Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).
    Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.
  liver and bile duct cancer: (LIH-ver ... bile dukt KAN-ser)
    Pronunciation of dictionary term "liver and bile duct cancer"
    Primary liver cancer is cancer that forms in the tissues of the liver. The most common type of primary liver cancer is hepatocellular carcinoma, which occurs in the tissue of the liver. When cancer starts in other parts of the body and spreads to the liver, it is called liver metastasis. Bile duct cancer forms in the small ducts (tubes) that carry bile (fluid made by the liver that helps digest fat) between the liver and gallbladder and the intestine. Bile duct cancer is also called cholangiocarcinoma. Intrahepatic bile duct cancer is found inside the liver. Extrahepatic bile duct cancer is found outside the liver.
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
    Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
  liver cancer: (LIH-ver KAN-ser)
    Pronunciation of dictionary term "liver cancer"
    Primary liver cancer is cancer that forms in the tissues of the liver. Secondary liver cancer is cancer that spreads to the liver from another part of the body.
    More Information
    - Liver and Bile Duct Cancer (https://www.cancer.gov/types/liver)
    The esophagus and stomach are part of the upper gastrointestinal (digestive) system.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.
  liver function test: (LIH-ver FUNK-shun ...)
    Pronunciation of dictionary term "liver function test"
    A blood test to measure the blood levels of certain substances released by the liver. A high or low level of certain substances can be a sign of liver disease.
  liver metastasis: (LIH-ver meh-TAS-tuh-sis)
    Pronunciation of dictionary term "liver metastasis"
    Cancer that has spread from the original (primary) tumor to the liver.
  liver X receptor alpha pathway: (LIH-ver … reh-SEP-ter AL-fuh PATH-way)
    Pronunciation of dictionary term "liver X receptor alpha pathway"
    Describes a group of proteins in a cell that work together to help control how certain genes are expressed and how cholesterol, lipids (fats), bile acids, and steroid hormones are made in the body. Changes in the liver X receptor alpha pathway may lead to diseases such as heart disease and cancer. Drugs or substances that affect this pathway are being studied in the prevention and treatment of cancer and other diseases. Also called LXR alpha pathway.
  liver-spleen scan: (LIH-ver ... skan)
    Pronunciation of dictionary term "liver-spleen scan"
    A procedure used to check for abnormal areas in the liver or spleen. A very small amount of a radioactive substance is injected into a vein and travels through the blood to the liver and spleen. It is detected by a scanner linked to a computer, which forms an image of the areas where the radioactive substance collects. A liver-spleen scan may be used to help find cancer in the liver or spleen, cirrhosis, hepatitis, and other liver or spleen problems.
    Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).
    Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.
  living will: (LIH-ving wil)
    Pronunciation of dictionary term "living will"
    A type of advance directive that states the specific types of medical care that a person wishes to receive if that person is no longer able to make medical decisions because of a terminal illness or being permanently unconscious. A living will usually has instructions about whether to use certain treatments to help keep a person alive, such as the use of dialysis (kidney) machines, breathing tubes, feeding tubes, and CPR. In the United States, the laws for living wills may be different for each state, and not every state may allow them.
    More Information
    - Advance Directives (https://www.cancer.gov/about-cancer/managing-care/advance-directives)
  LMB-1 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "LMB-1 immunotoxin"
    A toxic substance linked to an antibody that attaches to tumor cells and kills them.
  LMB-2 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "LMB-2 immunotoxin"
    A toxic substance linked to an antibody that attaches to tumor cells and kills them.
  LMB-7 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "LMB-7 immunotoxin"
    A toxic substance linked to an antibody that attaches to tumor cells and kills them.
  LMB-9 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "LMB-9 immunotoxin"
    A toxic substance linked to an antibody that attaches to tumor cells and kills them.
  LMP400: A substance being studied in the treatment of cancer. It blocks certain enzymes that break and rejoin DNA strands. These enzymes are needed for cells to divide and grow. Blocking them may cause cancer cells to die. LMP400 also helps anticancer drugs kill cancers that are resistant to some other drugs. LMP400 is a type of indenoisoquinoline and a type of topoisomerase inhibitor.
  LMP776: A substance being studied in the treatment of cancer. It blocks certain enzymes that break and rejoin DNA strands. These enzymes are needed for cells to divide and grow. Blocking them may cause cancer cells to die. LMP776 also helps anticancer drugs kill cancers that are resistant to some other drugs. LMP776 is a type of indenoisoquinoline and a type of topoisomerase inhibitor.
  lobaplatin: (LOH-buh-PLA-tin)
    Pronunciation of dictionary term "lobaplatin"
    A substance that contains the metal platinum and may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent.
  lobe: (lobe)
    Pronunciation of dictionary term "lobe"
    A portion of an organ, such as the liver, lung, breast, thyroid, or brain.
  lobectomy: (loh-BEK-toh-mee)
    Pronunciation of dictionary term "lobectomy"
    Surgery to remove a whole lobe (section) of an organ (such as the lungs, liver, brain, or thyroid gland).
    Lobectomy. A lobe of the lung is removed.
    Lobectomy; drawing shows lobes of both lungs, trachea, bronchi, bronchioles, and lymph nodes. Cancer is shown in one lobe. The removed lobe is shown next to the lung from which it was removed.
  lobeline: (LOH-beh-leen)
    Pronunciation of dictionary term "lobeline"
    A substance that comes from a plant known as Indian tobacco, which is different from the tobacco used to make smoking products. It has been studied as a way to help people stop smoking. It is a type of alkaloid.
  lobradimil: (loh-BRAY-dih-mil)
    Pronunciation of dictionary term "lobradimil"
    A substance that is being studied for its ability to help other drugs reach the brain. It belongs to the family of drugs called bradykinin agonists. Also called RMP-7.
  lobular capillary hemangioma: (LAH-byoo-ler KA-pih-layr-ee hee-MAN-jee-OH-muh)
    Pronunciation of dictionary term "lobular capillary hemangioma"
    A benign (not cancer) blood vessel tumor that usually forms on the skin. It may also form on mucous membranes and inside capillaries (small blood vessels) or other places on the body. Lobular capillary hemangiomas usually appear as raised, bright red lesions that may grow quickly and bleed a lot. The lesions are sometimes caused by injury or use of certain medicines and often come back after treatment. They usually occur in older children and young adults but may occur at any age. Lobular capillary hemangiomas are a type of vascular tumor. Also called pyogenic granuloma.
  lobular carcinoma: (LAH-byoo-ler KAR-sih-NOH-muh)
    Pronunciation of dictionary term "lobular carcinoma"
    Cancer that begins in the lobules (milk glands) of the breast. Lobular carcinoma may be either lobular carcinoma in situ (LCIS) or invasive lobular carcinoma. LCIS is a noninvasive condition in which abnormal cells are found in the lobules of the breast. LCIS rarely becomes invasive cancer, but having LCIS in one breast increases the risk of developing invasive cancer in either breast. In invasive lobular carcinoma, cancer has spread from the lobules to surrounding normal tissue. It can also spread through the blood and lymph systems to other parts of the body.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
  lobular carcinoma in situ: (LAH-byoo-ler KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "lobular carcinoma in situ"
    A condition in which abnormal cells are found in the lobules of the breast. This condition seldom becomes invasive cancer. However, having lobular carcinoma in situ in one breast increases the risk of developing breast cancer in either breast. Also called LCIS.
    Lobular carcinoma in situ (LCIS). Abnormal cells are found in the lobules of the breast.
    Lobular carcinoma in situ (LCIS); drawing shows a lobe, ducts, lobules, and fatty tissue in a cross section of the breast. Three separate pullouts show a normal lobe, a normal lobule, and a lobule with abnormal cells.
  lobular intraepithelial neoplasia: (LAH-byoo-ler IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "lobular intraepithelial neoplasia"
    A condition in which abnormal cells are found in the lobules (glands that make milk) of the breast. This condition rarely becomes cancer. However, having lobular intraepithelial neoplasia in one breast increases the risk of breast cancer in either breast. Types of lobular intraepithelial neoplasia include atypical lobular hyperplasia and lobular carcinoma in situ (LCIS). Also called LIN and lobular neoplasia.
  lobular neoplasia: (LAH-byoo-ler NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "lobular neoplasia"
    A condition in which abnormal cells are found in the lobules (glands that make milk) of the breast. This condition rarely becomes cancer. However, having lobular neoplasia in one breast increases the risk of breast cancer in either breast. Types of lobular neoplasia include atypical lobular hyperplasia and lobular carcinoma in situ (LCIS). Also called LIN and lobular intraepithelial neoplasia.
  lobule: (LAH-byool)
    Pronunciation of dictionary term "lobule"
    A small lobe or a subdivision of a lobe.
  local anesthesia: (LOH-kul A-nes-THEE-zhuh)
    Pronunciation of dictionary term "local anesthesia"
    A temporary loss of feeling in one small area of the body caused by special drugs called anesthetics. The patient stays awake but has no feeling in the area of the body treated with the anesthetic. Local anesthetics may be injected or put on the skin to lessen pain during medical, surgical, or dental procedures. Some are available over-the-counter (without a doctor’s order) and may help lessen local pain, irritation, and itching caused by conditions such as cold sores, sunburn, poison ivy, and minor cuts.
  local therapy: (LOH-kul THAYR-uh-pee)
    Pronunciation of dictionary term "local therapy"
    Treatment that is directed to a specific organ or limited area of the body, such as the breast or an abnormal growth on the skin. Examples of local therapy used in cancer are surgery, radiation therapy, cryotherapy, laser therapy, and topical therapy (medicine in a lotion or cream that is applied to the skin). Also called localized therapy.
  localization: (LOH-kuh-lih-ZAY-shun)
    Pronunciation of dictionary term "localization"
    The process of determining or marking the location or site of a lesion or disease. May also refer to the process of keeping a lesion or disease in a specific location or site.
  localized: (LOH-kuh-lized)
    Pronunciation of dictionary term "localized"
    In medicine, describes disease that is limited to a certain part of the body. For example, localized cancer is usually found only in the tissue or organ where it began, and has not spread to nearby lymph nodes or to other parts of the body. Some localized cancers can be completely removed by surgery.
  localized cancer: (LOH-kuh-lized KAN-ser)
    Pronunciation of dictionary term "localized cancer"
    Describes cancer that is found only in the tissue or organ where it first began and that has not spread to nearby lymph nodes or to other parts of the body.
  localized gallbladder cancer: (LOH-kuh-lized GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "localized gallbladder cancer"
    Cancer found only in the tissues that make up the wall of the gallbladder. Localized gallbladder cancer can be removed completely in an operation.
  localized therapy: (LOH-kuh-lized THAYR-uh-pee)
    Pronunciation of dictionary term "localized therapy"
    Treatment that is directed to a specific organ or limited area of the body, such as the breast or an abnormal growth on the skin. Examples of localized therapy used in cancer are surgery, radiation therapy, cryotherapy, laser therapy, and topical therapy (medicine in a lotion or cream that is applied to the skin). Also called local therapy.
  locally advanced cancer: (LOH-kuh-lee ad-VANST KAN-ser)
    Pronunciation of dictionary term "locally advanced cancer"
    Cancer that has spread from where it started to nearby tissue or lymph nodes.
  locally recurrent cancer: (LOH-kuh-lee ree-KER-ent KAN-ser)
    Pronunciation of dictionary term "locally recurrent cancer"
    Cancer that has recurred (come back) at or near the same place as the original (primary) tumor, usually after a period of time during which the cancer could not be detected.
  locus: (LOH-kus)
    Pronunciation of dictionary term "locus"
    Specific place where something is located or occurs. It may refer to a specific place on the body (such as an acupuncture point) or the place on a chromosome where a specific gene is found.
    More Information
    - Locus (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Locus)
  locus heterogeneity: (LOH-kus HEH-teh-roh-jeh-NEE-ih-tee)
    Pronunciation of dictionary term "locus heterogeneity"
    A term that describes when mutations (changes) in different genes cause the same disease or condition. Each mutation by itself is enough to cause the disease or condition. For example, xeroderma pigmentosum (a rare, inherited disorder with a very high risk of developing skin cancer and other types of cancer) is caused by having a mutation in one of at least nine different genes involved in repairing damaged DNA.
  Lofibra: (loh-FY-bruh)
    Pronunciation of dictionary term "Lofibra"
    A drug used to treat high levels of cholesterol and triglycerides in the blood. Lofibra is being studied in the treatment of advanced cancers in young patients and in the treatment of other conditions. It is a type of antilipidemic agent. Also called fenofibrate and TriCor.
  lometrexol: (loh-meh-TREK-sol)
    Pronunciation of dictionary term "lometrexol"
    A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called antifolates.
  lomustine: (loh-MUS-teen)
    Pronunciation of dictionary term "lomustine"
    A drug used to treat brain tumors that have already been treated with surgery or radiation therapy and Hodgkin lymphoma that got worse after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Lomustine damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea. Also called CCNU and Gleostine.
    More Information
    - Lomustine (https://www.cancer.gov/about-cancer/treatment/drugs/lomustine)
  lonafarnib: (loh-nah-FAR-nib)
    Pronunciation of dictionary term "lonafarnib"
    An anticancer drug that belongs to the family of drugs called enzyme inhibitors. Also called SCH 66336.
  loncastuximab tesirine: (LON-kas-TUK-sih-mab TEH-sih-reen)
    Pronunciation of dictionary term "loncastuximab tesirine"
    A drug used to treat adults with certain types of B-cell non-Hodgkin lymphoma that relapsed (came back) or did not get better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Loncastuximab tesirine contains a monoclonal antibody that binds to a protein called CD19, which is found on some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. Loncastuximab tesirine is a type of antibody-drug conjugate. Also called Zynlonta.
    More Information
    - Loncastuximab Tesirine-lpyl (https://www.cancer.gov/about-cancer/treatment/drugs/loncastuximabtesirine-lpyl)
  long-term side effect: (... eh-FEKT)
    Pronunciation of dictionary term "long-term side effect"
    A problem that is caused by a disease or treatment of a disease and may continue for months or years. Long-term side effects of cancer treatment include heart, lung, kidney, or gastrointestinal tract problems; pain, numbness, tingling, loss of feeling, or heat or cold sensitivity in the hands or feet; fatigue; hearing loss; cataracts; and dry eyes or dry mouth.
  longitudinal cohort study: (LON-jih-TOO-dih-nul KOH-hort STUH-dee)
    Pronunciation of dictionary term "longitudinal cohort study"
    A type of research study that follows large groups of people over a long time. The groups are alike in many ways but differ by a certain characteristic (for example, female nurses who smoke and those who do not smoke). A particular outcome (such as the development of lung cancer) is compared between the groups. The same people in each group are assessed many times throughout the study.
  Lonsurf: (LON-serf)
    Pronunciation of dictionary term "Lonsurf"
    A combination of two drugs used alone or with bevacizumab to treat adults with certain types of colorectal cancer, stomach cancer, or gastroesophageal junction cancer. It is used in patients whose cancer has spread to other parts of the body and has already been treated with other anticancer treatments. It is also being studied in the treatment of other types of cancer. Lonsurf stops cells from making DNA, which may help keep cancer cells from growing and may kill them. It is a type of antimetabolite and a type of thymidine phosphorylase inhibitor. Also called trifluridine and tipiracil hydrochloride.
    More Information
    - Trifluridine and Tipiracil Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/trifluridine-tipiracilhydrochloride)
  loop electrosurgical excision procedure: (loop ee-LEK-troh-SER-jih-kul ek-SIH-zhun proh-SEE-jer)
    Pronunciation of dictionary term "loop electrosurgical excision procedure"
    A technique that uses electric current passed through a thin wire loop to remove abnormal tissue. Also called LEEP and loop excision.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  loop excision: (...ek-SIH-zhun)
    Pronunciation of dictionary term "loop excision"
    A technique that uses electric current passed through a thin wire loop to remove abnormal tissue. Also called LEEP and loop electrosurgical excision procedure.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
  loperamide hydrochloride: (loh-PER-uh-mide HY-droh-KLOR-ide)
    Pronunciation of dictionary term "loperamide hydrochloride"
    A drug used to treat diarrhea. Loperamide hydrochloride works by binding to mu opioid receptors in the intestines, which slows the movement of the muscles in the intestines. This gives the body more time to absorb water and electrolytes from the feces (waste matter), resulting in firmer and less frequent bowel movements. Loperamide hydrochloride is a type of synthetic opioid agonist that works only in the gut when used as directed. Also called Imodium.
  lopinavir: (loh-PIH-nuh-veer)
    Pronunciation of dictionary term "lopinavir"
    A drug used with another drug, called ritonavir, to treat infection with HIV (the virus that causes AIDS). It is also being studied in the treatment of some types of cancer. Lopinavir blocks the ability of HIV to make copies of itself and may help some anticancer drugs work better. It is a type of anti-HIV agent and a type of protease inhibitor.
  lopinavir/ritonavir: (loh-PIH-nuh-veer/ry-TOH-nuh-veer)
    Pronunciation of dictionary term "lopinavir/ritonavir"
    A combination of the drugs ritonavir and lopinavir. It is used to treat infection with HIV (the virus that causes AIDS). It is also being studied in the treatment of some types of cancer. Lopinavir/ritonavir blocks the ability of HIV to make copies of itself and may help other anticancer drugs work better or may block the growth of cancer cells. Ritonavir blocks the breakdown of lopinavir. Lopinavir/ritonavir is a type of anti-HIV agent and a type of protease inhibitor. Also called Kaletra.
  Loqtorzi: (lok-TOR-zee)
    Pronunciation of dictionary term "Loqtorzi"
    A drug used alone or with other drugs to treat adults with certain types of nasopharyngeal cancer (a type of head and neck cancer). It is also being studied in the treatment of other types of cancer. Loqtorzi binds to a protein called PD-1, which is found on T cells (a type of immune cell). Blocking this protein may help the immune system kill cancer cells. Loqtorzi is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called toripalimab.
    More Information
    - Toripalimab-tpzi (https://www.cancer.gov/about-cancer/treatment/drugs/toripalimab-tpzi)
  lorazepam: (lor-A-zeh-pam)
    Pronunciation of dictionary term "lorazepam"
    A drug that is used to treat anxiety and certain seizure disorders (such as epilepsy), and to prevent nausea and vomiting caused by chemotherapy. It belongs to the families of drugs called antiemetics and benzodiazepines.
  Lorbrena: (lor-BREH-nuh)
    Pronunciation of dictionary term "Lorbrena"
    A drug used to treat adults with non-small cell lung cancer that has spread to other parts of the body and is ALK positive. It is also being studied in the treatment of other types of cancer. Lorbrena blocks certain proteins made by the ALK gene. Blocking these proteins may stop the growth and spread of cancer cells. Lorbrena is a type of tyrosine kinase inhibitor. Also called lorlatinib.
    More Information
    - Lorlatinib (https://www.cancer.gov/about-cancer/treatment/drugs/lorlatinib)
  lorlatinib: (lor-LA-tih-nib)
    Pronunciation of dictionary term "lorlatinib"
    A drug used to treat adults with non-small cell lung cancer that has spread to other parts of the body and is ALK positive. It is also being studied in the treatment of other types of cancer. Lorlatinib blocks certain proteins made by the ALK gene. Blocking these proteins may stop the growth and spread of cancer cells. Lorlatinib is a type of tyrosine kinase inhibitor. Also called Lorbrena.
    More Information
    - Lorlatinib (https://www.cancer.gov/about-cancer/treatment/drugs/lorlatinib)
  lorvotuzumab mertansine: (LOR-voh-TOO-zoo-mab mer-TAN-seen)
    Pronunciation of dictionary term "lorvotuzumab mertansine"
    A substance being studied in the treatment of some types of cancer, including Wilms tumor, neuroblastoma, rhabdomyosarcoma, and other types of soft tissue sarcoma. Lorvotuzumab mertansine contains a monoclonal antibody that binds to a protein called CD56 on some types of cancer cells. It also contains an anticancer drug called DM1, which may help kill cancer cells after lorvotuzumab mertansine binds to them. Lorvotuzumab mertansine is a type of antibody-drug conjugate. Also called BB-10901.
  losartan: (loh-SAR-tan)
    Pronunciation of dictionary term "losartan"
    A drug used to treat high blood pressure. Losartan blocks the action of chemicals that make blood vessels constrict (get narrower). It is a type of angiotensin II receptor antagonist. Also called Cozaar and losartan potassium.
  losartan potassium: (loh-SAR-tan puh-TA-see-um)
    Pronunciation of dictionary term "losartan potassium"
    A drug used to treat high blood pressure. Losartan potassium blocks the action of chemicals that make blood vessels constrict (get narrower). It is a type of angiotensin II receptor antagonist. Also called Cozaar.
  losoxantrone: (loh-SOK-san-trone)
    Pronunciation of dictionary term "losoxantrone"
    An anticancer drug that belongs to the family of drugs called antipyrazoles.
  lovastatin: (LOH-vuh-STA-tin)
    Pronunciation of dictionary term "lovastatin"
    A drug used to lower the amount of cholesterol in the blood. It is also being studied in the prevention and treatment of some types of cancer. Lovastatin is a type of HMG-CoA reductase inhibitor (statin). Also called Mevacor.
  low birth weight: (loh berth wayt)
    Pronunciation of dictionary term "low birth weight"
    A term used to describe an infant born weighing 5.5 pounds (2500 grams) or less. A low birth weight may occur when an infant is born too early (premature). These infants may have an increased risk of serious health problems. Smoking cigarettes, being exposed to secondhand tobacco smoke, drinking alcohol, and taking certain drugs during pregnancy can increase the risk of having an infant with a low birth weight.
  low grade: (loh grayd)
    Pronunciation of dictionary term "low grade"
    A term used to describe cells and tissue that look almost normal under a microscope. Low-grade cancer cells look more like normal cells and tend to grow and spread more slowly than high-grade cancer cells. Cancer grade may be used to help plan treatment and determine prognosis. Low-grade cancers usually have a better prognosis than high-grade cancers and may not need treatment right away.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  low tar cigarette: (loh tar SIH-guh-ret)
    Pronunciation of dictionary term "low tar cigarette"
    A type of cigarette that is claimed to give off less tobacco tar than a regular cigarette when smoked. Low tar cigarettes have been shown to be no safer than regular cigarettes, and smoking them does not lower the risk of cancer or other diseases. A person smoking a low tar cigarette can inhale the same amount of tobacco tar, nicotine, and harmful, cancer-causing chemicals as in a regular cigarette, depending on how the cigarette is smoked. Cigarettes are no longer allowed to be labeled or advertised as low tar cigarettes. Also called light cigarette.
    More Information
    - "Light" Cigarettes and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/light-cigarettes-fact-sheet)
  low-dose chemotherapy: (loh-dose KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "low-dose chemotherapy"
    Treatment in which low doses of anticancer drugs are given on a continuous or frequent, regular schedule (such as daily or weekly), usually over a long time. Low-dose chemotherapy causes less severe side effects than standard chemotherapy. Giving low doses of chemotherapy may stop the growth of new blood vessels that tumors need to grow. Also called metronomic chemotherapy.
  low-dose computed tomography: (loh-dose kum-PYOO-ted toh-MAH-gruh-fee)
    Pronunciation of dictionary term "low-dose computed tomography"
    A procedure that uses a computer linked to an x-ray machine that gives off a very low dose of radiation to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. Low-dose computed tomography is recommended as a screening test for adults who have a high risk of developing lung cancer based on their age and smoking history. Also called LDCT and low-dose CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  low-dose CT scan: (loh-dose ... skan)
    Pronunciation of dictionary term "low-dose CT scan"
    A procedure that uses a computer linked to an x-ray machine that gives off a very low dose of radiation to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. Low-dose CT scan is recommended as a screening test for adults who have a high risk of developing lung cancer based on their age and smoking history. Also called LDCT and low-dose computed tomography.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  low-dose radiation therapy: (loh-dose RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "low-dose radiation therapy"
    Radiation treatment in which the total dose of radiation is less than that given in standard radiation therapy. In low-dose radiation therapy, the total dose may be given in fewer treatments or over a shorter period of time (fewer days or weeks) than standard radiation therapy. This may cause less damage to nearby healthy tissue.
  low-grade DCIS: (loh-grayd …)
    Pronunciation of dictionary term "low-grade DCIS"
    A condition in which cells that look mostly like normal cells under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Low-grade DCIS tends to grow more slowly than intermediate-grade or high-grade DCIS. It is also less likely to come back or become invasive breast cancer and spread to other tissues. Also called grade I DCIS, grade I ductal carcinoma in situ, and low-grade ductal carcinoma in situ.
  low-grade ductal carcinoma in situ: (loh-grayd DUK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "low-grade ductal carcinoma in situ"
    A condition in which cells that look mostly like normal cells under a microscope are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Low-grade ductal carcinoma in situ tends to grow more slowly than intermediate-grade or high-grade ductal carcinoma in situ. It is also less likely to come back or become invasive breast cancer and spread to other tissues. Also called grade I DCIS, grade I ductal carcinoma in situ, and low-grade DCIS.
  low-grade fibromyxoid sarcoma: (… FY-broh-MIK-soyd sar-KOH-muh)
    Pronunciation of dictionary term "low-grade fibromyxoid sarcoma"
    A rare, slow-growing type of cancer that usually forms in the deep soft tissues of the legs or trunk (chest and abdomen). The cancer may come back many years after treatment and spread to the lungs and the lining of the wall of the chest cavity. The cancer cells usually have a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). Low-grade fibromyxoid sarcoma usually occurs in young and middle-aged adults. It is a type of soft tissue sarcoma.
  low-grade lymphoma: (... lim-FOH-muh)
    Pronunciation of dictionary term "low-grade lymphoma"
    A type of lymphoma that tends to grow and spread slowly, and has few symptoms. Also called indolent lymphoma.
  low-grade squamous intraepithelial lesion: (... SKWAY-mus IN-truh-eh-pih-THEE-lee-ul LEE-zhun)
    Pronunciation of dictionary term "low-grade squamous intraepithelial lesion"
    An area of abnormal cells that forms on the surface of certain organs, such as the cervix, vagina, vulva, anus, and esophagus. Low-grade squamous intraepithelial lesions look slightly abnormal when looked at under a microscope. They are usually caused by infection with certain types of human papillomavirus (HPV) and are found when a Pap test or biopsy is done. Low-grade squamous intraepithelial lesions usually go away on their own without treatment, but sometimes they can become cancer and spread into nearby tissue. Low-grade squamous intraepithelial lesion is sometimes called mild dysplasia. Also called LSIL.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
    Cervical changes. The cervix is the lower, narrow end of the uterus that forms a canal between the uterus and vagina. Before cancer cells form in tissues of the cervix, the cells of the cervix go through abnormal changes called dysplasia. There are different types of dysplasia. Mild dysplasia, called low-grade intraepithelial lesion (LSIL) is one type. Moderate or severe dysplasia, called high-grade intraepithelial lesion (HSIL) is another type of dysplasia. LSIL and HSIL may or may not become cancer.
    Cervical changes; drawing shows a cross-section of the uterus, cervix, and vagina. Also shown are four panels showing cell changes inside the cervix. The first panel shows normal cells. The second and third panels show abnormal cells called LSIL and HSIL. The fourth panel shows cervical cancer cells. Arrows are used between the panels to show that normal cells may become LSIL or HSIL, which may or may not become cancer.
  low-risk cancer: (loh-risk KAN-ser)
    Pronunciation of dictionary term "low-risk cancer"
    Cancer that tends to grow slowly, usually does not spread to other parts of the body, and may have a good chance of being cured. Knowing whether a cancer is low risk may help plan treatment. Some low-risk cancers may not need treatment right away.
  low-risk HPV: (loh-risk …)
    Pronunciation of dictionary term "low-risk HPV"
    A group of human papillomaviruses (HPV) that can infect cells on the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat, but rarely cause cancer. Low-risk HPV infections, most often HPV types 6 and 11, can cause warts on or around the genitals, anus, mouth, larynx, or other parts of the respiratory tract. Low-risk HPV is transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. It can also be transmitted during childbirth, but this is less common. Also called low-risk human papillomavirus.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  low-risk human papillomavirus: (loh-risk HYOO-mun PA-pih-LOH-muh-VY-rus)
    Pronunciation of dictionary term "low-risk human papillomavirus"
    A group of human papillomaviruses (HPV) that can infect cells on the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat, but rarely cause cancer. Low-risk human papillomavirus infections, most often HPV types 6 and 11, can cause warts on or around the genitals, anus, mouth, larynx, or other parts of the respiratory tract. Low-risk human papillomavirus is transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. It can also be transmitted during childbirth, but this is less common. Also called low-risk HPV.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  lower extremity: (LOH-er ek-STREH-mih-tee)
    Pronunciation of dictionary term "lower extremity"
    The part of the body that includes the leg, ankle, and foot.
  lower GI series: (LOH-er ... SEER-eez)
    Pronunciation of dictionary term "lower GI series"
    X-rays of the colon and rectum that are taken after a person is given a barium enema.
  lower jaw bone: (LOH-er jaw bone)
    Pronunciation of dictionary term "lower jaw bone"
    The lower jaw bone is the largest and strongest bone in the face. It forms the lower part of the jaw and part of the mouth. The lower jaw bone is the only moveable bone of the skull and is attached to muscles involved in chewing and other mouth movements. It also holds the bottom teeth in place. Also called mandible.
  LOXO-101: A drug used to treat adults and children with certain types of solid tumors that have spread or cannot be removed by surgery and have the NTRK gene fusion. It is also being studied in the treatment of other types of cancer. LOXO-101 blocks the TRK protein, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called larotrectinib sulfate, Trk inhibitor LOXO-101, and Vitrakvi.
    More Information
    - Larotrectinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)
  LP: A procedure in which a thin, hollow needle is inserted into the lower part of the spine to collect a sample of cerebrospinal fluid (CSF). This is done by placing the needle between two bones in the spine and into the subarachnoid space (the fluid-filled space between the thin layers of tissue around the spinal cord). After the CSF sample is removed, it is checked under a microscope for signs of infection, inflammation, or diseases, such as cancer or certain nervous system conditions. An LP may also be done to measure or reduce CSF pressure around the spinal cord and brain, to inject drugs, such as chemotherapy or anesthesia drugs, directly into the CSF, or to inject contrast dye for certain imaging tests. Also called lumbar puncture and spinal tap.
    Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.
    Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.
  LPHL: A rare type of Hodgkin lymphoma (a cancer of the immune system). It is marked by the presence of lymphocyte-predominant cells, which used to be called popcorn cells. These cells are different from the typical Reed-Sternberg cells found in classic Hodgkin lymphoma. LPHL may change into diffuse large B-cell lymphoma. Also called lymphocyte-predominant Hodgkin lymphoma, NLPHL, and nodular lymphocyte-predominant Hodgkin lymphoma.
  LRMDA gene: (... jeen)
    Pronunciation of dictionary term "LRMDA gene"
    A gene that makes a protein involved in the formation of cells that make the pigment melanin, which gives color to skin and eyes. Mutations (changes) in the LRMDA gene have been found in a rare inherited condition called oculocutaneous albinism type 7. People with this condition have vision problems, very fair skin, and a high risk of developing skin cancer.
  LSIL: An area of abnormal cells that forms on the surface of certain organs, such as the cervix, vagina, vulva, anus, and esophagus. LSILs look slightly abnormal when looked at under a microscope. They are usually caused by infection with certain types of human papillomavirus (HPV) and are found when a Pap test or biopsy is done. LSILs usually go away on their own without treatment, but sometimes they can become cancer and spread into nearby tissue. LSIL is sometimes called mild dysplasia. Also called low-grade squamous intraepithelial lesion.
    More Information
    - HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test
    Cervical changes. The cervix is the lower, narrow end of the uterus that forms a canal between the uterus and vagina. Before cancer cells form in tissues of the cervix, the cells of the cervix go through abnormal changes called dysplasia. There are different types of dysplasia. Mild dysplasia, called low-grade intraepithelial lesion (LSIL) is one type. Moderate or severe dysplasia, called high-grade intraepithelial lesion (HSIL) is another type of dysplasia. LSIL and HSIL may or may not become cancer.
    Cervical changes; drawing shows a cross-section of the uterus, cervix, and vagina. Also shown are four panels showing cell changes inside the cervix. The first panel shows normal cells. The second and third panels show abnormal cells called LSIL and HSIL. The fourth panel shows cervical cancer cells. Arrows are used between the panels to show that normal cells may become LSIL or HSIL, which may or may not become cancer.
  LU 79553: An anticancer drug that kills cancer cells by affecting DNA synthesis.
  LU-103793: An anticancer drug that reduces the risk of tumor cell growth and reproduction.
  lubricant: (LOO-brih-kunt)
    Pronunciation of dictionary term "lubricant"
    An oily or slippery substance.
  Lumakras: (LOO-muh-kras)
    Pronunciation of dictionary term "Lumakras"
    A drug used alone to treat adults with non-small cell lung cancer that has spread or cannot be removed by surgery, and with panitumumab to treat colorectal cancer that has spread. It is used in patients who have a certain mutation (change) in the KRAS gene and whose cancer was treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Lumakras blocks a protein (KRAS p.G12C) made by the mutated KRAS gene, which may help keep cancer cells from growing and may kill them. It is a type of targeted therapy. Also called sotorasib.
    More Information
    - Sotorasib (https://www.cancer.gov/about-cancer/treatment/drugs/sotorasib)
  lumbar puncture: (LUM-bar PUNK-cher)
    Pronunciation of dictionary term "lumbar puncture"
    A procedure in which a thin, hollow needle is inserted into the lower part of the spine to collect a sample of cerebrospinal fluid (CSF). This is done by placing the needle between two bones in the spine and into the subarachnoid space (the fluid-filled space between the thin layers of tissue around the spinal cord). After the CSF sample is removed, it is checked under a microscope for signs of infection, inflammation, or diseases, such as cancer or certain nervous system conditions. A lumbar puncture may also be done to measure or reduce CSF pressure around the spinal cord and brain, to inject drugs, such as chemotherapy or anesthesia drugs, directly into the CSF, or to inject contrast dye for certain imaging tests. Also called LP and spinal tap.
    Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.
    Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.
  LUMBAR/PELVIS/SACRAL syndrome: (LUM-bar/PEL-vus/SAY-krul SIN-drome)
    Pronunciation of dictionary term "LUMBAR/PELVIS/SACRAL syndrome"
    A rare disorder marked by a hemangioma (a benign blood vessel tumor) that spreads across a large area of the lower back or genital area. Other health problems that affect the urinary system, genitals, rectum, anus, brain, spinal cord, and nerve function may also occur. LUMBAR/PELVIC/SACRAL syndrome is most common in infants.
  lumen: (LOO-men)
    Pronunciation of dictionary term "lumen"
    The cavity or channel within a tube or tubular organ such as a blood vessel or the intestine.
  Lumigan: (LOO-mih-gun)
    Pronunciation of dictionary term "Lumigan"
    The drug bimatoprost used to treat glaucoma (a build-up of fluid in the eye). It lowers pressure in the eye by increasing the flow of natural eye fluids out of the eye. One drop of Lumigan is put directly in the eye once a day.
  luminal A breast cancer: (LOO-mih-nul … brest KAN-ser)
    Pronunciation of dictionary term "luminal A breast cancer"
    A subtype of hormone receptor-positive breast cancer. Luminal A breast cancer cells typically have estrogen receptor (ER) and progesterone receptor (PR) proteins inside them and a small amount or none of a protein called HER2 on their surface. Luminal A breast cancer cells also tend to have low levels of a protein called Ki-67, which is found only in cells that are dividing. Under a microscope, luminal A breast cancer cells look more like normal cells than other subtypes of breast cancer. They tend to grow slowly and have a good prognosis. Most breast cancers are luminal A.
  luminal B breast cancer: (LOO-mih-nul … brest KAN-ser)
    Pronunciation of dictionary term "luminal B breast cancer"
    A subtype of hormone receptor-positive breast cancer. Luminal B breast cancer cells typically have estrogen receptor (ER) proteins but not progesterone receptor (PR) proteins inside them. The cancer cells may or may not have the HER2 protein on their surface. Luminal B breast cancer cells often have high levels of a protein called Ki-67, which is found only in cells that are dividing. Luminal B breast cancers tend to grow more quickly and have a slightly poorer prognosis than luminal A breast cancers.
  Lumoxiti: (loo-MOK-sih-tee)
    Pronunciation of dictionary term "Lumoxiti"
    A drug used to treat adults with hairy cell leukemia that came back or did not get better with at least two other systemic therapies, including treatment with a purine nucleoside analog (a type of anticancer drug). Lumoxiti contains a monoclonal antibody that binds to a protein called CD22, which is found on B cells (a type of white blood cell) and some types of leukemia cells. It also contains a bacterial toxin called PE38, which may help kill cancer cells. Lumoxiti is a type of immunotoxin. Also called anti-CD22 immunotoxin CAT-8015, CAT-8015, and moxetumomab pasudotox.
    More Information
    - Moxetumomab Pasudotox-tdfk
  lumpectomy: (lum-PEK-toh-mee)
    Pronunciation of dictionary term "lumpectomy"
    Surgery to remove cancer or other abnormal tissue from the breast and some normal tissue around it, but not the breast itself. Some lymph nodes under the arm may be removed for biopsy. Part of the chest wall lining may also be removed if the cancer is near it. Also called breast-conserving surgery, breast-sparing surgery, partial mastectomy, quadrantectomy, and segmental mastectomy.
    More Information
    - Breast Cancer Treatment
    Lumpectomy. The tumor and some normal tissue around it are removed, but not the breast itself. Some lymph nodes under the arm may also be removed. If the cancer is near the chest wall, part of the chest wall lining may be removed as well.
    Lumpectomy; the drawing on the left shows removal of the tumor and some of the normal tissue around it. The drawing on the right shows removal of some of the lymph nodes under the arm and removal of the tumor and part of the chest wall lining near the tumor. Also shown is fatty tissue in the breast.
  lung: (lung)
    Pronunciation of dictionary term "lung"
    One of a pair of organs in the chest that supplies the body with oxygen, and removes carbon dioxide from the body.
    More Information
    - Lung Cancer (https://www.cancer.gov/types/lung)
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  lung biopsy: (… BY-op-see)
    Pronunciation of dictionary term "lung biopsy"
    The removal of a small piece of lung tissue to be checked by a pathologist for cancer or other diseases. The tissue may be removed using a bronchoscope (a thin, lighted, tube-like instrument that is inserted through the trachea and into the lung). It may also be removed using a fine needle inserted through the chest wall, by surgery guided by a video camera inserted through the chest wall, or by an open biopsy. In an open biopsy, a doctor makes an incision between the ribs, removes a sample of lung tissue, and closes the wound with stitches.
    Fine-needle aspiration biopsy of the lung. The patient lies on a table that slides through the computed tomography (CT) machine, which takes x-ray pictures of the inside of the body. The x-ray pictures help the doctor see where the abnormal tissue is in the lung. A biopsy needle is inserted through the chest wall and into the area of abnormal lung tissue. A small piece of tissue is removed through the needle and checked under the microscope for signs of cancer.
    Fine-needle aspiration biopsy of the lung; drawing shows a patient lying on a table that slides through the computed tomography (CT) machine with an x-ray picture of a cross-section of the lung on a monitor above the patient. Drawing also shows a doctor using the x-ray picture to help place the biopsy needle through the chest wall and into the area of abnormal lung tissue. Inset shows a side view of the chest cavity and lungs with the biopsy needle inserted into the area of abnormal tissue.
  lung cancer: (lung KAN-ser)
    Pronunciation of dictionary term "lung cancer"
    Cancer that forms in tissues of the lung, usually in the cells lining air passages. The two main types are small cell lung cancer and non-small cell lung cancer. These types are diagnosed based on how the cells look under a microscope.
    More Information
    - Lung Cancer (https://www.cancer.gov/types/lung)
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  lung disorder: (… dis-OR-der)
    Pronunciation of dictionary term "lung disorder"
    A type of disease that affects the lungs and other parts of the respiratory system. Lung disorders may be caused by infection, by smoking tobacco, or by breathing in secondhand tobacco smoke, radon, asbestos, or other forms of air pollution. Lung disorders include asthma, chronic obstructive pulmonary disease (COPD), pulmonary fibrosis, pneumonia, and lung cancer. Also called pulmonary disease and respiratory disease.
  lung function: (… FUNK-shun)
    Pronunciation of dictionary term "lung function"
    A term used to describe how well the lungs work in helping a person breathe. During breathing, oxygen is taken into the lungs, where it passes into the blood and travels to the body’s tissues. Carbon dioxide, a waste product made by the body’s tissues, is carried to the lungs, where it is breathed out. There are different tests to measure lung function. Also called pulmonary function.
  lung function test: (… FUNK-shun …)
    Pronunciation of dictionary term "lung function test"
    A test used to measure how well the lungs work. It measures how much air the lungs can hold and how quickly air is moved into and out of the lungs. It also measures how much oxygen is used and how much carbon dioxide is given off during breathing. A lung function test can be used to diagnose a lung disease and to see how well treatment for the disease is working. Also called PFT and pulmonary function test.
  lung metastasis: (...meh-TAS-tuh-sis)
    Pronunciation of dictionary term "lung metastasis"
    Cancer that has spread from the original (primary) tumor to the lung.
  Lunsumio: (lun-SUM-ee-oh)
    Pronunciation of dictionary term "Lunsumio"
    A drug used to treat adults with follicular lymphoma that came back or did not get better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Lunsumio binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called CD20, which is found on B cells (another type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Lunsumio is a type of bispecific monoclonal antibody. Also called mosunetuzumab.
    More Information
    - Mosunetuzumab-axgb (https://www.cancer.gov/about-cancer/treatment/drugs/mosunetuzumab-axgb)
  Lupron: (LOO-pron)
    Pronunciation of dictionary term "Lupron"
    A drug used to treat advanced prostate cancer. It is also being studied in the treatment of other types of cancer. Lupron keeps the testicles from making testosterone by blocking other hormones that are needed to make it. This may stop the growth of cancer cells that need testosterone to grow. Lupron is a type of gonadotropin-releasing hormone (GnRH) agonist. Also called Eligard, leuprolide acetate, and Lupron Depot.
    More Information
    - Leuprolide Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/leuprolideacetate)
  Lupron Depot: (LOO-pron DEE-poh)
    Pronunciation of dictionary term "Lupron Depot"
    A drug used under the brand names Eligard and Lupron Depot to treat prostate cancer and under the brand name Lupron Depot to treat problems with the endometrium (lining of the uterus) and uterine fibroids (noncancerous growths of the uterus) . It is also being studied in the treatment of other conditions and types of cancer. Lupron Depot initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men and estrogen levels in women. With continued use, Lupron Depot lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in men and estrogen levels in women. Lupron Depot may stop the growth of cancer cells that need testosterone to grow and stop the growth of endometrial tissue and uterine fibroids. It is a type of hormone therapy called a gonadotropin-releasing hormone (GnRH) agonist. Also called Eligard and leuprolide acetate.
    More Information
    - Leuprolide Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/leuprolideacetate)
  lupus: (LOO-pus)
    Pronunciation of dictionary term "lupus"
    A chronic, inflammatory, connective tissue disease that can affect the joints and many organs, including the skin, heart, lungs, kidneys, and nervous system. It can cause many different symptoms; however, not everyone with lupus has all of the symptoms. Also called SLE and systemic lupus erythematosus.
  lurbinectedin: (LOOR-bih-NEK-teh-din)
    Pronunciation of dictionary term "lurbinectedin"
    A drug used to treat adults with small cell lung cancer that has spread to other parts of the body and got worse during or after treatment with platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Lurbinectedin may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called Zepzelca.
    More Information
    - Lurbinectedin (https://www.cancer.gov/about-cancer/treatment/drugs/lurbinectedin)
  lurtotecan: (LOOR-toh-TEE-kan)
    Pronunciation of dictionary term "lurtotecan"
    An anticancer drug that belongs to the family of drugs called topoisomerase inhibitors.
  luspatercept: (lus-PA-ter-cept)
    Pronunciation of dictionary term "luspatercept"
    A drug used to treat anemia in adults with certain types of myelodysplastic syndromes or myelodysplastic/myeloproliferative neoplasms who need regular red blood cell transfusions and whose anemia did not respond to or cannot be treated with an erythropoiesis-stimulating agent. Luspatercept is also used to treat anemia in adults with beta thalassemia (an inherited blood disorder) who need regular red blood cell transfusions. It is also being studied in the treatment of other conditions. Luspatercept helps the bone marrow make more red blood cells. It is a type of antianemic and a type of recombinant fusion protein. Also called Reblozyl.
    More Information
    - Luspatercept-aamt (https://www.cancer.gov/about-cancer/treatment/drugs/luspatercept-aamt)
  Lutathera: (LOO-tuh-THAYR-uh)
    Pronunciation of dictionary term "Lutathera"
    A radioactive drug used to treat adults and children aged 12 years and older with gastroenteropancreatic neuroendocrine tumors that are somatostatin receptor positive. It is also being studied in the treatment of other types of cancer. Lutathera binds to a protein called somatostatin receptor, which is found on some neuroendocrine tumor cells. Lutathera builds up in these cells and gives off radiation that may kill them. It is a type of radioconjugate and a type of somatostatin analog. Also called lutetium Lu 177-dotatate.
    More Information
    - Lutetium Lu 177-Dotatate (https://www.cancer.gov/about-cancer/treatment/drugs/lutetiumLu177-dotatate)
  luteinizing hormone: (LOO-tih-NY-zing HOR-mone)
    Pronunciation of dictionary term "luteinizing hormone"
    A hormone made in the pituitary gland. In females, it acts on the ovaries to make follicles release their eggs and to make hormones that get the uterus ready for a fertilized egg to be implanted. In males, it acts on the testes to cause cells to grow and make testosterone. Also called interstitial cell-stimulating hormone, LH, and lutropin.
  luteinizing hormone-releasing hormone: (LOO-tih-NY-zing HOR-mone-reh-LEE-sing HOR-mone)
    Pronunciation of dictionary term "luteinizing hormone-releasing hormone"
    A hormone made by a part of the brain called the hypothalamus. Luteinizing hormone-releasing hormone causes the pituitary gland in the brain to make and secrete the hormones luteinizing hormone (LH) and follicle-stimulating hormone (FSH). In men, these hormones cause the testicles to make testosterone. In women, they cause the ovaries to make estrogen and progesterone. Also called GnRH, gonadotropin-releasing hormone, LH-RH, and LHRH.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  luteinizing hormone-releasing hormone agonist: (LOO-tih-NY-zing HOR-mone-reh-LEE-sing HOR-mone A-guh-nist)
    Pronunciation of dictionary term "luteinizing hormone-releasing hormone agonist"
    A substance that keeps the testicles and ovaries from making sex hormones by blocking other hormones that are needed to make them. In men, luteinizing hormone-releasing hormone agonists cause the testicles to stop making testosterone. In women, they cause the ovaries to stop making estrogen and progesterone. Some luteinizing hormone-releasing hormone agonists are used to treat prostate cancer. Also called GnRH agonist, GnRHa, gonadotropin-releasing hormone agonist, and LHRH agonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  luteinizing hormone-releasing hormone antagonist: (LOO-tih-NY-zing HOR-mone-reh-LEE-sing HOR-mone an-TA-guh-nist)
    Pronunciation of dictionary term "luteinizing hormone-releasing hormone antagonist"
    A substance that blocks the pituitary gland from making hormones called follicle-stimulating hormone (FSH) and luteinizing hormone (LH). In men, this causes the testicles to stop making testosterone. In women, this causes the ovaries to stop making estrogen and progesterone. Some luteinizing hormone-releasing hormone antagonists are used to treat advanced prostate cancer. They are also used to treat certain gynecologic conditions and are being studied in the treatment of hormone-sensitive breast cancer. Also called GnRH antagonist, gonadotropin-releasing hormone antagonist, and LHRH antagonist.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  lutetium Lu 177 vipivotide tetraxetan: (loo-TEE-shee-um … vy-PIH-voh-tide teh-TRAK-seh-tan)
    Pronunciation of dictionary term "lutetium Lu 177 vipivotide tetraxetan"
    A radioactive drug used to treat adults with PSMA-positive prostate cancer that has spread to other parts of the body and has not responded to treatments that lower testosterone levels. It is used in patients whose cancer has been treated with an androgen receptor inhibitor and who can either delay or have received treatment with a type of anticancer drug called a taxane. Lutetium Lu 177 vipivotide tetraxetan binds to a protein called PSMA, which is found on some prostate cancer cells. It gives off radiation that may kill the cancer cells. Lutetium Lu 177 vipivotide tetraxetan is a type of radioconjugate. Also called Pluvicto.
    More Information
    - Lutetium Lu 177 Vipivotide Tetraxetan (https://www.cancer.gov/about-cancer/treatment/drugs/lutetium-Lu-177-vipivotide-tetraxetan)
  lutetium Lu 177-dotatate: (loo-TEE-shee-um … DOH-tuh-tayt)
    Pronunciation of dictionary term "lutetium Lu 177-dotatate"
    A radioactive drug used to treat adults and children aged 12 years and older with gastroenteropancreatic neuroendocrine tumors that are somatostatin receptor positive. It is also being studied in the treatment of other types of cancer. Lutetium Lu 177-dotatate binds to a protein called somatostatin receptor, which is found on some neuroendocrine tumor cells. Lutetium Lu 177-dotatate builds up in these cells and gives off radiation that may kill them. It is a type of radioconjugate and a type of somatostatin analog. Also called Lutathera.
    More Information
    - Lutetium Lu 177-Dotatate (https://www.cancer.gov/about-cancer/treatment/drugs/lutetiumLu177-dotatate)
  lutetium texaphyrin: (loo-TEE-shee-um tek-SA-fih-rin)
    Pronunciation of dictionary term "lutetium texaphyrin"
    A substance that is being studied in the treatment of cancer using photodynamic therapy. It belongs to the family of drugs called metallotexaphyrins. Also called motexafin lutetium.
  lutropin: (LOO-troh-pin)
    Pronunciation of dictionary term "lutropin"
    A hormone made in the pituitary gland. In females, it acts on the ovaries to make follicles release their eggs and to make hormones that get the uterus ready for a fertilized egg to be implanted. In males, it acts on the testes to cause cells to grow and make testosterone. Also called interstitial cell-stimulating hormone, LH, and luteinizing hormone.
  Luvox: (LOO-vox)
    Pronunciation of dictionary term "Luvox"
    A drug used to treat obsessive-compulsive disorder. It is a type of antidepressant agent and selective serotonin reuptake inhibitor (SSRI). Also called fluvoxamine.
  LVA: Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph vessels or nodes become damaged or blocked. During an LVA, lymph vessels are rerouted to connect directly to nearby veins in the affected part of the body so that lymph can flow around the damaged or blocked area. This creates a new path for lymph to re-enter the bloodstream and travel through the body. Also called LVB, lymphaticovenous anastomosis, and lymphovenous bypass.
  LVB: Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph vessels or nodes become damaged or blocked. During an LVB, lymph vessels are rerouted to connect directly to nearby veins in the affected part of the body so that lymph can flow around the damaged or blocked area. This creates a new path for lymph to re-enter the bloodstream and travel through the body. Also called LVA, lymphaticovenous anastomosis, and lymphovenous bypass.
  LXR alpha pathway: (… AL-fuh PATH-way)
    Pronunciation of dictionary term "LXR alpha pathway"
    Describes a group of proteins in a cell that work together to help control how certain genes are expressed and how cholesterol, lipids (fats), bile acids, and steroid hormones are made in the body. Changes in the LXR alpha pathway may lead to diseases such as heart disease and cancer. Drugs or substances that affect this pathway are being studied in the prevention and treatment of cancer and other diseases. Also called liver X receptor alpha pathway.
  LY231514: A drug used alone or with other drugs to treat certain types of non-small cell lung cancer and malignant pleural mesothelioma. It is also being studied in the treatment of other types of cancer. LY231514 stops cells from using folic acid to make DNA and may kill cancer cells. It is a type of antimetabolite and a type of antifolate. Also called Alimta, pemetrexed disodium, and Pemfexy.
    More Information
    - Pemetrexed Disodium (https://www.cancer.gov/about-cancer/treatment/drugs/pemetrexeddisodium)
  LY293111: A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called leukotriene B4 receptor antagonists.
  LY317615: A substance being studied in the treatment of certain types of cancer, including non-Hodgkin lymphoma, breast, colon, lung, ovarian, and prostate. LY317615 blocks certain cell signaling pathways, and may prevent the growth of new blood vessels that tumors need to grow. It is a type of serine threonine kinase inhibitor and a type of antiangiogenesis agent. Also called enzastaurin hydrochloride.
  LY335979: A substance being studied in the treatment of cancer. LY335979 may help kill cancer cells that are resistant to anticancer drugs. Also called zosuquidar trihydrochloride.
  LY353381 hydrochloride: (... HY-droh-KLOR-ide)
    Pronunciation of dictionary term "LY353381 hydrochloride"
    A substance being studied in the treatment of osteoporosis and breast cancer. LY353381 hydrochloride is made in the laboratory and binds to estrogen receptors in the body. It is a type of selective estrogen receptor modulator (SERM). Also called arzoxifene hydrochloride.
  lycopene: (LY-kuh-peen)
    Pronunciation of dictionary term "lycopene"
    A red pigment found in tomatoes and some fruits. It is an antioxidant and may help prevent some types of cancer.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  lymph: (limf)
    Pronunciation of dictionary term "lymph"
    Clear, watery fluid that comes from plasma (the liquid part of the blood) that has leaked through the blood capillary walls into the spaces around cells. Lymph carries white blood cells, nutrients, and other substances throughout the body in lymph vessels. As lymph flows through the lymph vessels, it collects extra fluids, cellular debris, and harmful substances from the tissues and is filtered by lymph nodes. The filtered lymph returns to the bloodstream to help maintain fluid balance in the body and immune health. Also called lymphatic fluid.
  lymph gland: (limf gland)
    Pronunciation of dictionary term "lymph gland"
    A small bean-shaped structure that is part of the body’s immune system. Lymph glands filter substances that travel through the lymphatic fluid, and they contain lymphocytes (white blood cells) that help the body fight infection and disease. There are hundreds of lymph glands found throughout the body. They are connected to one another by lymph vessels. Clusters of lymph glands are found in the neck, axilla (underarm), chest, abdomen, and groin. For example, there are about 20-40 lymph glands in the axilla. Also called lymph node.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  lymph node: (limf node)
    Pronunciation of dictionary term "lymph node"
    A small bean-shaped structure that is part of the body’s immune system. Lymph nodes filter substances that travel through the lymphatic fluid, and they contain lymphocytes (white blood cells) that help the body fight infection and disease. There are hundreds of lymph nodes found throughout the body. They are connected to one another by lymph vessels. Clusters of lymph nodes are found in the neck, axilla (underarm), chest, abdomen, and groin. For example, there are about 20-40 lymph nodes in the axilla. Also called lymph gland.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  lymph node biopsy: (limf node BY-op-see)
    Pronunciation of dictionary term "lymph node biopsy"
    A procedure in which all or part of a lymph node is removed and checked under a microscope for signs of infection or disease, such as cancer. There are several types of lymph node biopsies, including excisional biopsy (removal of entire lymph node), incisional biopsy (removal of part of a lymph node), core needle biopsy (removal of tissue from a lymph node using a wide needle), and fine-needle aspiration biopsy (removal of tissue from a lymph node using a thin needle).
  lymph node dissection: (limf node dy-SEK-shun)
    Pronunciation of dictionary term "lymph node dissection"
    A surgical procedure in which the lymph nodes are removed and a sample of tissue is checked under a microscope for signs of cancer. For a regional lymph node dissection, some of the lymph nodes in the tumor area are removed; for a radical lymph node dissection, most or all of the lymph nodes in the tumor area are removed. Also called lymphadenectomy.
  lymph node drainage: (limf node DRAY-nij)
    Pronunciation of dictionary term "lymph node drainage"
    The flow of lymph from an area of tissue into a particular lymph node.
  lymph node mapping: (limf node MA-ping)
    Pronunciation of dictionary term "lymph node mapping"
    The use of dyes and radioactive substances to identify lymph nodes that may contain tumor cells. Also called lymphatic mapping.
  lymph system: (limf SIS-tem)
    Pronunciation of dictionary term "lymph system"
    The tissues and organs that help the body fight infection and disease. The lymph system includes the lymph nodes, lymph vessels (thin tubes that carry lymph and white blood cells), bone marrow, spleen, thymus, tonsils and adenoids, and lymph tissue in the small intestine and other parts of the body. The lymph system is an important part of the body's immune system. It also plays an important role in maintaining healthy fluid levels in the body, removing cellular debris and harmful substances from the tissues, and helping the body absorb certain fats and other molecules. Also called lymphatic system.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  lymph vessel: (limf ...)
    Pronunciation of dictionary term "lymph vessel"
    A thin tube that collects lymph (clear watery fluid) from tissues in different parts of the body and returns it to the bloodstream. Lymph vessels branch, like blood vessels, throughout the body. They vary in size but are typically larger than blood capillaries and smaller than most veins. Also called lymphatic vessel.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  lymphadenectomy: (LIM-fa-deh-NEK-toh-mee)
    Pronunciation of dictionary term "lymphadenectomy"
    A surgical procedure in which the lymph nodes are removed and a sample of tissue is checked under a microscope for signs of cancer. For a regional lymphadenectomy, some of the lymph nodes in the tumor area are removed; for a radical lymphadenectomy, most or all of the lymph nodes in the tumor area are removed. Also called lymph node dissection.
  lymphadenopathy: (limf-A-deh-NAH-puh-thee)
    Pronunciation of dictionary term "lymphadenopathy"
    Disease or swelling of the lymph nodes.
  lymphangiogram: (lim-FAN-jee-oh-gram)
    Pronunciation of dictionary term "lymphangiogram"
    An x-ray or computer image of the lymphatic system. A dye is injected into the body to make the lymphatic vessels and lymph nodes easier to see in the image. A lymphangiogram may be used to check for blockages or leaks in the lymphatic system and to help diagnose certain conditions, such as lymphedema or lymphoma. It may also be used with a lymph node biopsy to find out whether cancer has spread.
  lymphangiography: (lim-FAN-jee-AH-gruh-fee)
    Pronunciation of dictionary term "lymphangiography"
    A procedure that uses x-rays or magnetic resonance imaging (MRI) to make pictures of the lymphatic system. A dye is injected into the body to make the lymphatic vessels and lymph nodes easier to see in the pictures. Lymphangiography may be used to check for blockages or leaks in the lymphatic system and to help diagnose certain conditions, such as lymphedema or lymphoma, or find out whether cancer has spread. It may also be used to help plan treatment or find out how well treatment is working. Lymphangiography is also sometimes used before surgery to learn more about the structure of a person's lymphatic system. Also called lymphography.
  lymphangiosarcoma: (lim-FAN-jee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "lymphangiosarcoma"
    A type of cancer that begins in the cells that line lymph vessels.
  lymphangitic carcinomatosis: (LIM-fan-JIH-tik KAR-sih-NOH-muh-TOH-sis)
    Pronunciation of dictionary term "lymphangitic carcinomatosis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the lymph vessels (the thin tubes that carry lymph and white blood cells through the body’s lymph system). The cancer cells build up in the lymph vessels, which causes them to become blocked. Lymphangitic carcinomatosis usually occurs in the lungs. It can happen in many types of cancer, but it is most common in people with cancers of the breast, lung, colon, stomach, pancreas, or prostate. Also called carcinomatous lymphangitis.
  lymphatic basin: (lim-FA-tik BAY-sin)
    Pronunciation of dictionary term "lymphatic basin"
    A group of lymph nodes that receives and filters lymph that flows from a certain area of the body. Special dyes may be used to stain and identify the lymphatic basin in the tissues around a tumor, so that lymph nodes that may contain cancer can be removed and checked by a pathologist.
  lymphatic fluid: (lim-FA-tik FLOO-id)
    Pronunciation of dictionary term "lymphatic fluid"
    Clear, watery fluid that comes from plasma (the liquid part of the blood) that has leaked through the blood capillary walls into the spaces around cells. Lymphatic fluid carries white blood cells, nutrients, and other substances throughout the body in lymph vessels. As lymphatic fluid flows through the lymph vessels, it collects extra fluids, cellular debris, and harmful substances from the tissues and is filtered by lymph nodes. The filtered lymphatic fluid returns to the bloodstream to help maintain fluid balance in the body and immune health. Also called lymph.
  lymphatic mapping: (lim-FA-tik MA-ping)
    Pronunciation of dictionary term "lymphatic mapping"
    The use of dyes and radioactive substances to identify lymph nodes that may contain tumor cells. Also called lymph node mapping.
  lymphatic system: (lim-FA-tik SIS-tem)
    Pronunciation of dictionary term "lymphatic system"
    The tissues and organs that help the body fight infection and disease. The lymphatic system includes the lymph nodes, lymph vessels (thin tubes that carry lymph and white blood cells), bone marrow, spleen, thymus, tonsils and adenoids, and lymph tissue in the small intestine and other parts of the body. The lymphatic system is an important part of the body's immune system. It also plays an important role in maintaining healthy fluid levels in the body, removing cellular debris and harmful substances from the tissues, and helping the body absorb certain fats and other molecules. Also called lymph system.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  lymphatic vessel: (lim-FA-tik ...)
    Pronunciation of dictionary term "lymphatic vessel"
    A thin tube that collects lymph (clear watery fluid) from tissues in different parts of the body and returns it to the bloodstream. Lymphatic vessels branch, like blood vessels, throughout the body. They vary in size but are typically larger than blood capillaries and smaller than most veins. Also called lymph vessel.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  lymphaticovenous anastomosis: (lim-FA-tih-koh-VEE-nus uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "lymphaticovenous anastomosis"
    Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph vessels or nodes become damaged or blocked. During a lymphaticovenous anastomosis, lymph vessels are rerouted to connect directly to nearby veins in the affected part of the body so that lymph can flow around the damaged or blocked area. This creates a new path for lymph to re-enter the bloodstream and travel through the body. Also called LVA, LVB, and lymphovenous bypass.
  lymphedema: (LIM-fuh-DEE-muh)
    Pronunciation of dictionary term "lymphedema"
    A condition in which lymph builds up in tissues and causes swelling. Lymphedema usually affects an arm or leg, but it can also affect other parts of the body. Lymphedema can occur when lymph vessels or nodes become damaged or blocked, which affects the flow of lymph in the body. This is most commonly caused by cancer or cancer treatment, such as surgery or radiation therapy. It can also be caused by infection with certain parasites or by having certain inherited conditions in which the lymph nodes or lymph vessels are abnormal or absent. Lymphedema cannot be cured, but treatment can help relieve swelling, pain, and other symptoms.
    More Information
    - Lymphedema (https://www.cancer.gov/about-cancer/treatment/side-effects/lymphedema)
    Lymphedema is swelling caused by a buildup of lymph fluid in the body, usually in an arm or leg. The lymph system helps the body fight infection and is made up of lymph nodes, lymphatic vessels, and organs that collect and carry lymph fluid through the body. When part of the lymph system is damaged or blocked by cancer or cancer treatment, the flow of lymph fluid through the body is disrupted. This can lead to increased fluid in the tissues, inflammation, and the release of white blood cells, which can cause swelling in the affected body part. Discoloration and hardening of the skin in the affected area can also occur.
    Lymphedema; drawing showing a female figure with a red, swollen arm. The lymph nodes and lymphatic vessels are also shown in the figure. There is a pull-out from the swollen arm showing a top layer of red, hardened skin. There is also a pull-out box from a lymphatic vessel below the skin that shows a cancerous tumor blocking the flow of lymph fluid through a lymphatic vessel and a buildup of fluid and white blood cells in the surrounding tissues.
  Lymphir: (LIM-fur)
    Pronunciation of dictionary term "Lymphir"
    A drug used to treat adults with stage I, stage II, or stage III cutaneous T-cell lymphoma that came back or did not get better after treatment with at least one other systemic therapy. It is also being studied in the treatment of other types of cancer. Lymphir is made by combining interleukin-2 (IL-2) with a bacterial toxin. The IL-2 part of the drug attaches to the cancer cells and the toxin kills them. Lymphir is a type of immunotoxin and a type of recombinant fusion protein. Also called denileukin diftitox.
    More Information
    - Denileukin Diftitox-cxdl (https://www.cancer.gov/about-cancer/treatment/drugs/denileukindiftitox-cxdl)
  lymphoblast: (LIM-foh-BLAST)
    Pronunciation of dictionary term "lymphoblast"
    A lymphocyte that has gotten larger after being stimulated by an antigen. Lymphoblast also refers to an immature cell that can develop into a mature lymphocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  lymphoblastic: (LIM-foh-BLAS-tik)
    Pronunciation of dictionary term "lymphoblastic"
    Refers to lymphoblasts (a type of immature white blood cell).
  lymphoblastic lymphoma: (LIM-foh-BLAS-tik lim-FOH-muh)
    Pronunciation of dictionary term "lymphoblastic lymphoma"
    An aggressive (fast-growing) type of non-Hodgkin lymphoma in which too many lymphoblasts (immature white blood cells) are found in the lymph nodes and the thymus gland. These lymphoblasts may spread to other places in the body. It is most common in teenagers and young adults and affects more males than females. It may be a T or B cell type. Also called precursor lymphoblastic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  lymphocyte: (LIM-foh-site)
    Pronunciation of dictionary term "lymphocyte"
    A type of immune cell that is made in the bone marrow and is found in the blood and in lymph tissue. The two main types of lymphocytes are B lymphocytes and T lymphocytes. B lymphocytes make antibodies, and T lymphocytes help kill tumor cells and help control immune responses. A lymphocyte is a type of white blood cell.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  lymphocyte-predominant Hodgkin lymphoma: (LIM-foh-site-preh-DAH-mih-nunt HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "lymphocyte-predominant Hodgkin lymphoma"
    A rare type of Hodgkin lymphoma (a cancer of the immune system). It is marked by the presence of lymphocyte-predominant cells, which used to be called popcorn cells. These cells are different from the typical Reed-Sternberg cells found in classic Hodgkin lymphoma. Lymphocyte-predominant Hodgkin lymphoma may change into diffuse large B-cell lymphoma. Also called LPHL, NLPHL, and nodular lymphocyte-predominant Hodgkin lymphoma.
  lymphocytic: (LIM-foh-SIH-tik)
    Pronunciation of dictionary term "lymphocytic"
    Refers to lymphocytes (a type of white blood cell).
  lymphocytic leukemia: (LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "lymphocytic leukemia"
    A type of cancer in which the bone marrow makes too many lymphocytes (white blood cells).
  lymphocytic leukopenia: (LIM-foh-SIH-tik LOO-koh-PEE-nee-uh)
    Pronunciation of dictionary term "lymphocytic leukopenia"
    A condition in which there is a lower-than-normal number of lymphocytes (a type of white blood cell) in the blood. Also called lymphocytopenia and lymphopenia.
  lymphocytopenia: (LIM-foh-SY-toh-PEE-nee-uh)
    Pronunciation of dictionary term "lymphocytopenia"
    A condition in which there is a lower-than-normal number of lymphocytes (a type of white blood cell) in the blood. Also called lymphocytic leukopenia and lymphopenia.
  lymphoepithelioma: (LIM-foh-EH-pih-THEE-lee-OH-muh)
    Pronunciation of dictionary term "lymphoepithelioma"
    A type of cancer that begins in the tissues covering the nasopharynx (the upper part of the throat behind the nose).
  lymphography: (lim-FAH-gruh-fee)
    Pronunciation of dictionary term "lymphography"
    A procedure that uses x-rays or magnetic resonance imaging (MRI) to make pictures of the lymphatic system. A dye is injected into the body to make the lymphatic vessels and lymph nodes easier to see in the pictures. Lymphography may be used to check for blockages or leaks in the lymphatic system and to help diagnose certain conditions, such as lymphedema or lymphoma, or find out whether cancer has spread. It may also be used to help plan treatment or find out how well treatment is working. Lymphography is also sometimes used before surgery to learn more about the structure of a person's lymphatic system. Also called lymphangiography.
  lymphoid: (LIM-foyd)
    Pronunciation of dictionary term "lymphoid"
    Referring to lymphocytes, a type of white blood cell. Also refers to tissue in which lymphocytes develop.
  lymphokine-activated killer cell: (LIM-foh-kine-AK-tih-vay-ted KIH-ler sel)
    Pronunciation of dictionary term "lymphokine-activated killer cell"
    A white blood cell that is stimulated in a laboratory to kill tumor cells. Also called LAK cell.
  lymphoma: (lim-FOH-muh)
    Pronunciation of dictionary term "lymphoma"
    Cancer that begins in cells of the immune system. There are two basic categories of lymphomas. One kind is Hodgkin lymphoma, which is marked by the presence of a type of cell called the Reed-Sternberg cell. The other category is non-Hodgkin lymphomas, which includes a large, diverse group of cancers of immune system cells. Non-Hodgkin lymphomas can be further divided into cancers that have an indolent (slow-growing) course and those that have an aggressive (fast-growing) course. These subtypes behave and respond to treatment differently. Both Hodgkin and non-Hodgkin lymphomas can occur in children and adults, and prognosis and treatment depend on the stage and the type of cancer.
  lymphomatoid granulomatosis: (lim-FOH-muh-toyd GRAN-yoo-loh-muh-TOH-sis)
    Pronunciation of dictionary term "lymphomatoid granulomatosis"
    Destructive growth of lymph cells, usually involving the lungs, skin, kidneys, and central nervous system. Grades I and II are not considered cancer, but grade III is considered a lymphoma.
  lymphomatous leptomeningitis: (lim-FOH-muh-tus LEP-toh-MEH-nin-JY-tis)
    Pronunciation of dictionary term "lymphomatous leptomeningitis"
    A serious problem that may occur in lymphoma. In lymphomatous leptomeningitis, cancer cells have spread from the original (primary) tumor to the meninges (thin layers of tissue that cover and protect the brain and spinal cord). The cancer may cause the meninges to be inflamed. Also called lymphomatous meningitis.
  lymphomatous meningitis: (lim-FOH-muh-tus MEH-nin-JY-tis)
    Pronunciation of dictionary term "lymphomatous meningitis"
    A serious problem that may occur in lymphoma. In lymphomatous meningitis, cancer cells have spread from the original (primary) tumor to the meninges (thin layers of tissue that cover and protect the brain and spinal cord). The cancer may cause the meninges to be inflamed. Also called lymphomatous leptomeningitis.
  lymphopenia: (LIM-foh-PEE-nee-uh)
    Pronunciation of dictionary term "lymphopenia"
    A condition in which there is a lower-than-normal number of lymphocytes (a type of white blood cell) in the blood. Also called lymphocytic leukopenia and lymphocytopenia.
  lymphoplasmacytic lymphoma: (LIM-foh-plaz-muh-SIH-tik lim-FOH-muh)
    Pronunciation of dictionary term "lymphoplasmacytic lymphoma"
    An indolent (slow-growing) type of non-Hodgkin lymphoma marked by abnormal levels of IgM antibodies in the blood and an enlarged liver, spleen, or lymph nodes. Also called Waldenström macroglobulinemia.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  lymphopoietin-1: (LIM-foh-POY-eh-tin...)
    Pronunciation of dictionary term "lymphopoietin-1"
    One of a group of related proteins made by leukocytes (white blood cells) and other cells in the body. Lymphopoietin-1 is made by cells that cover and support organs, glands, and other structures in the body. It causes the growth of T lymphocytes and B lymphocytes. Lymphopoietin-1 made in the laboratory is used as a biological response modifier to boost the immune system in cancer therapy. Lymphopoietin-1 is a type of cytokine. Also called IL-7 and interleukin-7.
  lymphoproliferative disorder: (LIM-foh-proh-LIH-feh-ruh-tiv dis-OR-der)
    Pronunciation of dictionary term "lymphoproliferative disorder"
    A disease in which cells of the lymphatic system grow excessively. Lymphoproliferative disorders are often treated like cancer.
  lymphosarcoma: (LIM-foh-sar-KOH-muh)
    Pronunciation of dictionary term "lymphosarcoma"
    An obsolete term for a malignant tumor of lymphatic tissue.
  lymphoscintigraphy: (LIM-foh-sin-TIH-gruh-fee)
    Pronunciation of dictionary term "lymphoscintigraphy"
    A method used to check the lymph system for disease. A radioactive substance that flows through the lymph ducts and can be taken up by lymph nodes is injected into the body. A scanner or probe is used to follow the movement of this substance on a computer screen. Lymphoscintigraphy is used to find the sentinel lymph node (the first node to receive lymph from a tumor), which may be removed and checked for tumor cells. Lymphoscintigraphy is also used to diagnose certain diseases or conditions, such as lymphoma or lymphedema.
  lymphostatic elephantiasis: (lim-foh-STA-tik EH-luh-fun-TY-uh-sis)
    Pronunciation of dictionary term "lymphostatic elephantiasis"
    A chronic condition marked by extreme swelling in an arm, leg, or other part of the body caused by a buildup of lymph in the tissues. The skin of the affected area usually feels hard and thick and may be darker in color. There may also be decreased mobility in the affected area. Lymphostatic elephantiasis can occur when lymph vessels or nodes become damaged or blocked, which affects the flow of lymph in the body. This is most commonly caused by cancer or cancer treatment, such as surgery or radiation therapy. Lymphostatic elephantiasis is considered the most advanced stage of lymphedema. Also called stage III lymphedema.
  lymphovenous bypass: (LIM-foh-VEE-nus BY-pass)
    Pronunciation of dictionary term "lymphovenous bypass"
    Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph vessels or nodes become damaged or blocked. During a lymphovenous bypass, lymph vessels are rerouted to connect directly to nearby veins in the affected part of the body so that lymph can flow around the damaged or blocked area. This creates a new path for lymph to re-enter the bloodstream and travel through the body. Also called LVA, LVB, and lymphaticovenous anastomosis.
  lymphovenous transplant: (LIM-foh-VEE-nus TRANZ-plant)
    Pronunciation of dictionary term "lymphovenous transplant"
    Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph nodes or vessels become damaged or blocked. During a lymphovenous transplant, healthy tissue containing lymph nodes and vessels is taken from one part of the body, such as the neck, abdomen, or groin, and moved to the area with the damaged lymph nodes, usually in a person’s arm or leg. This may cause the lymph nodes and vessels in the healthy tissue to grow and help improve the flow of lymph in that area. Also called vascularized lymph node transfer and VLNT.
  Lynch syndrome: (linch SIN-drome)
    Pronunciation of dictionary term "Lynch syndrome"
    An inherited disorder that increases the risk of developing colorectal cancer, endometrial cancer, ovarian cancer, and many other types of cancer, such as cancers of the stomach, small intestine, pancreas, bile duct, urinary tract, and brain, often before age 50. Lynch syndrome is caused by mutations (changes) in genes that affect DNA mismatch repair, a process that fixes mistakes that occur when DNA is copied. These genes are MLH1, MSH2, MSH6, PMS2, and EPCAM. Also called hereditary nonpolyposis colorectal cancer and HNPCC.
    More Information
    - Lynch syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/lynch-syndrome/)
    - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  Lynparza: (lin-PAR-zuh)
    Pronunciation of dictionary term "Lynparza"
    A drug used alone or with other drugs to treat adults with certain types of prostate cancer, pancreatic cancer, breast cancer, or ovarian, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Lynparza blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Lynparza is a type of PARP inhibitor. Also called AZD2281, olaparib, and PARP inhibitor AZD2281.
    More Information
    - Olaparib (https://www.cancer.gov/about-cancer/treatment/drugs/olaparib)
  Lyrica: (LEER-ih-kuh)
    Pronunciation of dictionary term "Lyrica"
    A drug used to treat nerve pain caused by diabetes or herpes zoster infection and certain types of seizures. It is being studied in the prevention and treatment of nerve pain in the hands and feet of cancer patients given chemotherapy. Lyrica is a type of anticonvulsant. Also called pregabalin.
  lysis: (LY-sis)
    Pronunciation of dictionary term "lysis"
    In biology, lysis refers to the breakdown of a cell caused by damage to its plasma (outer) membrane. It can be caused by chemical or physical means (for example, strong detergents or high-energy sound waves) or by infection with a strain virus that can lyse cells.
  lysosome: (LY-soh-some)
    Pronunciation of dictionary term "lysosome"
    A sac-like compartment inside a cell that has enzymes that can break down cellular components that need to be destroyed.
  Lytgobi: (lite-GOH-bee)
    Pronunciation of dictionary term "Lytgobi"
    A drug used to treat adults with intrahepatic cholangiocarcinoma (a type of cancer that forms in the bile ducts inside the liver) that has spread or cannot be removed by surgery and has an FGFR2 gene fusion or other change in the structure of the FGFR2 gene. It is used in patients whose cancer has already been treated. It is also being studied in the treatment of other types of cancer. Lytgobi blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called futibatinib.
    More Information
    - Futibatinib (https://www.cancer.gov/about-cancer/treatment/drugs/futibatinib)
  lytic: (LIH-tik)
    Pronunciation of dictionary term "lytic"
    Having to do with lysis. In biology, lysis refers to the disintegration of a cell by disruption of its plasma membrane. Lysis can be caused by chemical or physical means (e.g., high-energy sound waves) or by a virus infection.
  lytic lesion: (LIH-tik LEE-zhun)
    Pronunciation of dictionary term "lytic lesion"
    Destruction of an area of bone due to a disease process, such as cancer.
  M protein: (... PROH-teen)
    Pronunciation of dictionary term "M protein"
    An antibody found in unusually large amounts in the blood or urine of people with multiple myeloma and other types of plasma cell tumors. Also called monoclonal protein.
  M-EDTA: A substance being studied in the prevention of bacterial infections that occur in catheters (thin tubes that carry fluids into or out of the body). It is a combination of minocycline, an antibiotic that blocks the growth of bacteria, and EDTA, a substance that keeps blood clots from forming. M-EDTA removes metals that bacteria use to form biofilms (thin layers stuck to surfaces). Also called minocycline-EDTA.
  M200: A monoclonal antibody that is being studied in the treatment of some types of cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. M200 binds to a protein that is found on cells that line some tumor blood vessels. It is a type of angiogenesis inhibitor. Also called volociximab.
  ma huang: (mah hwong)
    Pronunciation of dictionary term "ma huang"
    A shrub native to China and India. The stems and roots are used in traditional medicine as a diuretic and for asthma, bronchitis, and cough. It has also been promoted as a decongestant, a weight loss aid, and as a supplement to increase energy. Ma huang may cause high blood pressure, increased heart rate, or death if used with certain drugs, and may reduce the effects of certain drugs used to treat cancer and other diseases. The U.S. Food and Drug Administration has banned the sale of dietary supplements that contain ma huang. The scientific name is Ephedra sinica. Also called ephedra.
  machine learning: (muh-SHEEN LER-ning)
    Pronunciation of dictionary term "machine learning"
    A field of computer science that develops the processes by which computers are taught how to learn and perform certain functions without being specifically programmed to perform those functions. Machine learning involves analyzing very large amounts of information to improve a computer’s ability to make decisions or predictions. Machine learning is a part of artificial intelligence (AI). In medicine, the use of machine learning and AI may help improve cancer screening and diagnosis and plan treatment.
  macrobiotic diet: (MA-kroh-by-AH-tik DY-et)
    Pronunciation of dictionary term "macrobiotic diet"
    A plant-based diet that is high in unprocessed carbohydrates and low in fat and processed carbohydrates. A macrobiotic diet consists mostly of whole grains and organic vegetables, including fermented vegetables and beans. The components of the diet may vary according to a person’s age, sex, existing health issues, level of activity, and the climate where they live. There is no proof that a macrobiotic diet can slow, cure, or keep diseases such as cancer from coming back.
  macrocalcification: (MA-kroh-KAL-sih-fih-KAY-shun)
    Pronunciation of dictionary term "macrocalcification"
    A small deposit of calcium in the breast that cannot be felt but can be seen on a mammogram. It is usually caused by aging, an old injury, or inflamed tissue and is usually not related to cancer.
  macroglobulinemia: (MA-kroh-GLAH-byoo-lih-NEE-mee-uh)
    Pronunciation of dictionary term "macroglobulinemia"
    A condition in which the blood contains high levels of large proteins and is too thick to flow through small blood vessels. One type is Waldenström macroglobulinemia, which is a type of cancer.
  macrophage: (MA-kroh-fayj)
    Pronunciation of dictionary term "macrophage"
    A type of white blood cell that surrounds and kills microorganisms, removes dead cells, and stimulates the action of other immune system cells.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  macular degeneration: (MA-kyoo-ler dee-JEH-neh-RAY-shun)
    Pronunciation of dictionary term "macular degeneration"
    A condition in which there is a slow breakdown of cells in the center of the retina (the light-sensitive layers of nerve tissue at the back of the eye). This blocks vision in the center of the eye and can cause problems with activities such as reading and driving. Macular degeneration is most often seen in people who are over the age of 50. Also called age-related macular degeneration, AMD, and ARMD.
  macular edema: (MA-kyoo-ler eh-DEE-muh)
    Pronunciation of dictionary term "macular edema"
    A buildup of fluid in the macula, the part of the retina (the light-sensitive layers of tissue at the back of the eye) that helps people see things directly in front of them. Macular edema can cause blurry or wavy vision, colors to appear dull, and vision loss that worsens over time. Macular edema is usually caused by diabetic retinopathy, an eye condition that can cause vision loss and blindness in people with diabetes. It can also be caused by other eye conditions, eye tumors, eye surgery, trauma to the eye, or certain medications.
  Maffucci syndrome: (muh-FOO-chee SIN-drome)
    Pronunciation of dictionary term "Maffucci syndrome"
    A very rare disorder that affects the skin and cartilage. It is marked by benign (not cancer) growths of cartilage in bones. These growths usually occur in the hands or feet, but may also occur in the skull, ribs, and spine. They may cause severely deformed bone, shortening of the arms or legs, broken bones, and other bone problems. Maffucci syndrome is also marked by hemangiomas (benign blood vessel tumors), most often in the skin. People with this syndrome have an increased risk of certain cancers, such as chondrosarcoma (cancer that forms in bone cartilage) or cancers of the ovary or liver. Maffucci syndrome is most common in young children.
    More Information
    - Maffucci syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6958/maffucci-syndrome)
    - Maffucci syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/maffucci-syndrome/)
  mafosfamide: (muh-FOS-fuh-mide)
    Pronunciation of dictionary term "mafosfamide"
    A form of cyclophosphamide that can be administered as an intrathecal infusion. Mafosfamide is being studied as an anticancer drug. It belongs to the family of drugs called alkylating agents.
  MAGE-3 antigen: (... AN-tih-jen)
    Pronunciation of dictionary term "MAGE-3 antigen"
    A protein found in many types of tumors but not in most normal tissues. Vaccines using pieces of the MAGE-3 protein are being studied for their ability to boost the immune response to cancer cells in patients with cancer.
  magnesium: (mag-NEE-zee-um)
    Pronunciation of dictionary term "magnesium"
    In medicine, a mineral used by the body to help maintain muscles, nerves, and bones. It is also used in energy metabolism and protein synthesis.
  magnesium sulfate: (mag-NEE-zee-um SUL-fayt)
    Pronunciation of dictionary term "magnesium sulfate"
    A drug used to treat pre-eclampsia and eclampsia (serious complications of pregnancy). Magnesium sulfate is also being studied for its ability to prevent the toxic side effects of certain drugs used to treat colorectal cancer. It is a type of anticonvulsant agent.
  magnetic resonance angiography: (mag-NEH-tik REH-zuh-nunts an-jee-AH-gruh-fee)
    Pronunciation of dictionary term "magnetic resonance angiography"
    A procedure that uses radio waves and a powerful magnet linked to a computer to create detailed pictures of the blood vessels and blood flow inside the body. A dye may be injected into a vein to make the blood vessels and blood flow easier to see. Magnetic resonance angiography may be used to check for aneurysms (a bulge in the blood vessel wall), blockages in the arteries, blood clots, and other blood vessel problems. Also called MRA.
  magnetic resonance cholangiopancreatography: (mag-NEH-tik REH-zuh-nunts koh-LAN-jee-oh-PAN-kree-uh-TAH-gruh-fee)
    Pronunciation of dictionary term "magnetic resonance cholangiopancreatography"
    A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of the liver, bile ducts, gallbladder, pancreas, and pancreatic duct. A dye may be injected into the body to make the ducts and organs easier to see. Magnetic resonance cholangiopancreatography may be used to help diagnose certain conditions, such as gallstones, inflammation of the pancreas or gallbladder, and bile duct or pancreatic duct problems. It may also be used to help diagnose certain types of cancer, such as bile duct cancer (cholangiocarcinoma) and pancreatic cancer. Magnetic resonance cholangiopancreatography is a type of magnetic resonance imaging (MRI). Also called MRCP.
  magnetic resonance imaging: (mag-NEH-tik REH-zuh-nunts IH-muh-jing)
    Pronunciation of dictionary term "magnetic resonance imaging"
    A procedure that uses radio waves, a powerful magnet, and a computer to make a series of detailed pictures of areas inside the body. A contrast agent, such as gadolinium, may be injected into a vein to help the tissues and organs show up more clearly in the picture. Magnetic resonance imaging may be used to help diagnose disease, plan treatment, or find out how well treatment is working. It is especially useful for imaging the brain and spinal cord, the heart and blood vessels, the bones, joints, and other soft tissues, the organs in the pelvis and abdomen, and the breast. Also called MRI, NMRI, and nuclear magnetic resonance imaging.
    Magnetic resonance imaging (MRI) of the abdomen. The patient lies on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    Magnetic resonance imaging (MRI) of the abdomen; drawing shows the patient on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    An MRI of the breast is a procedure that uses radio waves, a strong magnet, and a computer to create detailed pictures of the inside of the breast. A contrast dye may be injected into a vein (not shown) to make the breast tissues easier to see on the MRI pictures. An MRI may be used with other breast imaging tests to detect breast cancer or other abnormal changes in the breast. It may also be used to screen for breast cancer in some people who have a high risk of the disease. Note: The inset shows an MRI image of the insides of both breasts. Credit for inset: The Cancer Imaging Archive (TCIA).
    MRI of the breast; drawing shows a person lying face down on a narrow, padded table with their arms above their head. The person’s breasts hang down into an opening in the table. The table slides into the MRI machine, which takes detailed pictures of the inside of the breast. An inset shows an MRI image of the insides of both breasts.
  magnetic resonance lymphangiography: (mag-NEH-tik REH-zuh-nunts lim-FAN-jee-AH-gruh-fee)
    Pronunciation of dictionary term "magnetic resonance lymphangiography"
    A procedure that uses radio waves, a powerful magnet, and a computer to make a series of detailed pictures of the lymphatic system. A dye is injected into the body to make the lymphatic vessels and lymph nodes easier to see. Magnetic resonance lymphangiography may be used to check for blockages or leaks in the lymphatic system and to help diagnose certain conditions, such as lymphedema or lymphoma, or find out whether cancer has spread. It may also be used to help plan treatment or find out how well treatment is working. Magnetic resonance lymphangiography is sometimes used before surgery to learn more about the structure of a person's lymphatic system. Also called MRL.
  magnetic resonance perfusion imaging: (mag-NEH-tik REH-zuh-nunts per-FYOO-zhun IH-muh-jing)
    Pronunciation of dictionary term "magnetic resonance perfusion imaging"
    A special type of magnetic resonance imaging (MRI) that uses an injected dye in order to see blood flow through tissues. Also called perfusion magnetic resonance imaging.
  magnetic resonance spectroscopic imaging: (mag-NEH-tik REH-zuh-nunts SPEK-troh-SKAH-pik IH-muh-jing)
    Pronunciation of dictionary term "magnetic resonance spectroscopic imaging"
    A noninvasive imaging method that provides information about cellular activity (metabolic information). It is used along with magnetic resonance imaging (MRI) which provides information about the shape and size of the tumor (spatial information). Also called 1H-nuclear magnetic resonance spectroscopic imaging, MRSI, and proton magnetic resonance spectroscopic imaging.
  magnetic-targeted carrier: (mag-NEH-tik-TAR-geh-ted KAYR-ee-er)
    Pronunciation of dictionary term "magnetic-targeted carrier"
    A tiny bead made from particles of iron and carbon that can be attached to an anticancer drug. A magnet applied from outside the body then can direct the drug to the tumor site. This can keep a larger dose of the drug at the tumor site for a longer period of time, and help protect healthy tissue from the side effects of chemotherapy.
  Magnevist: (MAG-neh-vist)
    Pronunciation of dictionary term "Magnevist"
    A substance used in magnetic resonance imaging (MRI) to help make clear pictures of the brain, spine, heart, soft tissue of joints, and inside bones. Magnevist is being studied in the diagnosis of cancer. It is a type of contrast agent. Also called gadopentetate dimeglumine and Gd-DTPA.
  maidenhair tree: (MAY-din-HAYR...)
    Pronunciation of dictionary term "maidenhair tree"
    A tree native to China. Substances taken from the leaves and seeds have been used in some cultures to treat certain medical problems. Maidenhair tree has been studied in the prevention and treatment of Alzheimer disease, dementia, certain blood vessel diseases, and memory loss. It may cause bleeding or high blood pressure when used with certain drugs. Also called ginkgo and ginkgo biloba.
  mainstream medicine: (MAYN-streem MEH-dih-sin)
    Pronunciation of dictionary term "mainstream medicine"
    A system in which medical doctors and other health care professionals (such as nurses, pharmacists, and therapists) treat symptoms and diseases using drugs, radiation, or surgery. Also called allopathic medicine, biomedicine, conventional medicine, orthodox medicine, and Western medicine.
  mainstream smoke: (MAYN-streem ...)
    Pronunciation of dictionary term "mainstream smoke"
    Tobacco smoke that is exhaled by smokers. Mainstream smoke can be a form of secondhand smoke. It contains nicotine and many harmful, cancer-causing chemicals. Inhaling mainstream smoke increases the risk of lung cancer and may increase the risk of other types of cancer. Inhaling it also increases the risk of other health problems, such as heart disease and lung disease.
    More Information
    - Secondhand Smoke and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/second-hand-smoke-fact-sheet)
  maintenance therapy: (MAYN-teh-nunts THAYR-uh-pee)
    Pronunciation of dictionary term "maintenance therapy"
    Treatment that is given to help keep cancer from coming back after it has disappeared following the initial therapy. It may include treatment with drugs, vaccines, or antibodies that kill cancer cells, and it may be given for a long time.
  malabsorption syndrome: (MA-lub-SORP-shun SIN-drome)
    Pronunciation of dictionary term "malabsorption syndrome"
    A group of symptoms such as gas, bloating, abdominal pain, and diarrhea resulting from the body's inability to properly absorb nutrients.
  male breast cancer: (mayl brest KAN-ser)
    Pronunciation of dictionary term "male breast cancer"
    Cancer that forms in tissues of the breast in men. Most male breast cancer begins in cells lining the ducts. It is very rare and usually affects older men.
    More Information
    - Male Breast Cancer Treatment
  malignancy: (muh-LIG-nun-see)
    Pronunciation of dictionary term "malignancy"
    A term for diseases in which abnormal cells divide without control and can invade nearby tissues. Malignant cells can also spread to other parts of the body through the blood and lymph systems. There are several main types of malignancy. Carcinoma is a malignancy that begins in the skin or in tissues that line or cover internal organs. Sarcoma is a malignancy that begins in bone, cartilage, fat, muscle, blood vessels, or other connective or supportive tissue. Leukemia is a malignancy that begins in blood-forming tissue, such as the bone marrow, and causes too many abnormal blood cells to be made. Lymphoma and multiple myeloma are malignancies that begin in the cells of the immune system. Central nervous system cancers are malignancies that begin in the tissues of the brain and spinal cord. Also called cancer.
    More Information
    - What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)
  malignant: (muh-LIG-nunt)
    Pronunciation of dictionary term "malignant"
    A term used to describe cancer. Malignant cells grow in an uncontrolled way and can invade nearby tissues and spread to other parts of the body through the blood and lymph system.
    More Information
    - What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)
  malignant ascites: (muh-LIG-nunt uh-SY-teez)
    Pronunciation of dictionary term "malignant ascites"
    A condition in which fluid containing cancer cells collects in the abdomen.
  malignant ectomesenchymoma: (muh-LIG-nunt EK-toh-MEH-zen-ky-MOH-muh)
    Pronunciation of dictionary term "malignant ectomesenchymoma"
    A rare, fast-growing tumor of the nervous system or soft tissue that occurs in children and young adults. Malignant ectomesenchymomas may form in the head and neck, abdomen, perineum, scrotum, or limbs. Also called ectomesenchymoma.
  malignant fibrous cytoma: (muh-LIG-nunt FY-brus sy-TOH-muh)
    Pronunciation of dictionary term "malignant fibrous cytoma"
    A type of cancer that usually forms in the soft tissue, but it may also form in bone. It can occur anywhere in the body, but it usually occurs in the legs (especially the thighs), arms, or back of the abdomen. It may also occur in a part of the body where a patient received radiation therapy in the past. Malignant fibrous cytomas often grow quickly and spread to other parts of the body, including the lungs. They usually occur in older adults, and they may sometimes occur as a second cancer in patients who had retinoblastoma. Also called malignant fibrous histiocytoma and undifferentiated pleomorphic sarcoma.
    More Information
    - Osteosarcoma Treatment
  malignant fibrous histiocytoma: (muh-LIG-nunt FY-brus HIS-tee-oh-sy-TOH-muh)
    Pronunciation of dictionary term "malignant fibrous histiocytoma"
    A type of cancer that usually forms in the soft tissue, but it may also form in bone. It can occur anywhere in the body, but it usually occurs in the legs (especially the thighs), arms, or back of the abdomen. It may also occur in a part of the body where a patient received radiation therapy in the past. Malignant fibrous histiocytomas often grow quickly and spread to other parts of the body, including the lungs. They usually occur in older adults, and they may sometimes occur as a second cancer in patients who had retinoblastoma. Also called malignant fibrous cytoma and undifferentiated pleomorphic sarcoma.
    More Information
    - Osteosarcoma Treatment
  malignant meningioma: (muh-LIG-nunt meh-NIN-jee-OH-muh)
    Pronunciation of dictionary term "malignant meningioma"
    A rare, fast-growing tumor that forms in one of the inner layers of the meninges (thin layers of tissue that cover and protect the brain and spinal cord). Malignant meningioma often spreads to other areas of the body.
  malignant mesothelioma: (muh-LIG-nunt MEH-zoh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "malignant mesothelioma"
    A rare type of cancer in which malignant cells are found in the lining of the chest or abdomen. Exposure to airborne asbestos particles increases one's risk of developing malignant mesothelioma.
    More Information
    - Malignant Mesothelioma (https://www.cancer.gov/types/mesothelioma)
    Malignant mesothelioma forms in the tissue that lines the chest or abdomen, including the pleura (the tissue that lines the chest cavity and covers the lungs) and the peritoneum (the tissue that lines the abdomen and covers most of the organs in the abdomen). Malignant mesothelioma may also form in the pericardium (the tissue that surrounds the heart) or the testicles, but this is rare.
    Drawing shows parts of the body where malignant mesothelioma may form, including the pleura (the tissue that lines the chest cavity and covers the lungs), the pericardium (the tissue that surrounds the heart), the peritoneum (the tissue that lines the abdomen and covers most of the organs in the abdomen), and the testicles. The heart and lungs are also shown.
  malignant mixed Müllerian tumor: (muh-LIG-nunt mikst myoo-LAYR-ee-un TOO-mer)
    Pronunciation of dictionary term "malignant mixed Müllerian tumor"
    A rare type of tumor that is a mixture of carcinoma and sarcoma cells. MMMT usually occurs in the uterus. Also called MMMT.
  malignant pericardial effusion: (muh-LIG-nunt PAYR-ih-KAR-dee-ul eh-FYOO-zhun)
    Pronunciation of dictionary term "malignant pericardial effusion"
    A condition in which cancer causes extra fluid to collect inside the sac around the heart. The extra fluid causes pressure on the heart, which keeps it from pumping blood normally. Lymph vessels may be blocked, which can cause infection. Malignant pericardial effusions are most often caused by lung cancer, breast cancer, melanoma, lymphoma, and leukemia.
    More Information
    - Cardiopulmonary Syndromes
  malignant peripheral nerve sheath tumor: (muh-LIG-nunt peh-RIH-feh-rul ... TOO-mer)
    Pronunciation of dictionary term "malignant peripheral nerve sheath tumor"
    A type of soft tissue sarcoma that develops in cells that form a protective sheath (covering) around peripheral nerves, which are nerves that are outside of the central nervous system (brain and spinal cord). Also called MPNST.
  malignant peritoneal effusion: (muh-LIG-nunt PAYR-ih-toh-NEE-ul eh-FYOO-zhun)
    Pronunciation of dictionary term "malignant peritoneal effusion"
    A condition in which cancer causes extra fluid to collect between the thin layers of the peritoneum (tissue that lines the abdomen and covers most of the organs in the abdomen). Signs and symptoms may include pain or swelling in the abdomen, trouble breathing, chest pain, weight gain, nausea, loss of appetite, and fatigue. Malignant peritoneal effusions are most often caused by cancers of the ovary, uterus, breast, colon, lung, pancreas, and liver.
  malignant pleural effusion: (muh-LIG-nunt PLOOR-ul eh-FYOO-zhun)
    Pronunciation of dictionary term "malignant pleural effusion"
    A condition in which cancer causes an abnormal amount of fluid to collect between the thin layers of tissue (pleura) lining the outside of the lung and the wall of the chest cavity. Lung cancer, breast cancer, lymphoma, and leukemia cause most malignant pleural effusions.
    More Information
    - Cardiopulmonary Syndromes
  malignant triton tumor: (muh-LIG-nunt TRY-ton TOO-mer)
    Pronunciation of dictionary term "malignant triton tumor"
    A very rare, fast-growing type of cancer that forms in the nerve sheath (a protective covering around nerves that are not part of the brain or spinal cord). The tumor is made up of Schwann cells (cells that hold nerve cells in place) and rhabdomyoblasts (a type of muscle cell). Malignant triton tumors occur most often in patients with neurofibromatosis type 1. A malignant triton tumor is a type of soft tissue sarcoma.
  malnourished: (mal-NER-isht)
    Pronunciation of dictionary term "malnourished"
    Describes a condition caused by not getting enough calories or the right amount of key nutrients needed for health. Key nutrients include vitamins and minerals.
  malnutrition: (mal-noo-TRIH-shun)
    Pronunciation of dictionary term "malnutrition"
    A condition caused by not getting enough calories or the right amount of key nutrients, such as vitamins and minerals, that are needed for health. Malnutrition may occur when there is a lack of nutrients in the diet or when the body cannot absorb nutrients from food. Cancer and cancer treatment may cause malnutrition.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  malondialdehyde: (MA-lon-dy-AL-deh-hide)
    Pronunciation of dictionary term "malondialdehyde"
    A byproduct of lipid (fat) metabolism in the body. It is also found in many foods and can be present in high amounts in rancid food.
  MALT lymphoma: (... lim-FOH-muh)
    Pronunciation of dictionary term "MALT lymphoma"
    A type of cancer that arises in cells in mucosal tissue that are involved in antibody production. Also called mucosa-associated lymphoid tissue lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  mammalian target of rapamycin: (muh-MA-lee-un TAR-get … RA-puh-MY-sin)
    Pronunciation of dictionary term "mammalian target of rapamycin"
    A protein that helps control several cell functions, including cell division and survival, and binds to rapamycin and other drugs. Mammalian target of rapamycin may be more active in some types of cancer cells than it is in normal cells. Blocking mammalian target of rapamycin may cause the cancer cells to die. It is a type of serine/threonine protein kinase. Also called mechanistic target of rapamycin and mTOR.
  MammaPrint: (MA-muh-print)
    Pronunciation of dictionary term "MammaPrint"
    A lab test that is used to help predict whether breast cancer will come back or spread to other parts of the body. The test looks at the activity level of 70 different genes in breast cancer tissue of people with early-stage (stage I, II, or IIIA) invasive breast cancer that is less than 5 cm and is either node-negative or has spread to 1 to 3 lymph nodes. If the test shows that there is a high risk that the cancer will spread or come back, treatment with chemotherapy may be needed to lower the risk. Also called 70-gene signature.
  mammary: (MA-muh-ree)
    Pronunciation of dictionary term "mammary"
    Having to do with the breast.
  mammary duct ectasia: (MA-muh-ree dukt ek-TAY-zhuh)
    Pronunciation of dictionary term "mammary duct ectasia"
    A benign (not cancer) condition in which a milk duct under the nipple widens and thickens. This can cause the milk duct to become blocked and fluid to build up inside it. There are usually no symptoms, but sometimes there may be a thick nipple discharge or redness or tenderness of the nipple and nearby breast tissue. Mammary duct ectasia is most common in women who are near menopause or have gone through it. Also called breast duct ectasia.
  mammary dysplasia: (MA-muh-ree dis-PLAY-zhuh)
    Pronunciation of dictionary term "mammary dysplasia"
    A group of conditions marked by changes in breast tissue that are benign (not cancer). There are different types of mammary dysplasia, including some types caused by an increase in the number of cells or by the growth of abnormal cells in the breast ducts or lobes. Signs and symptoms of mammary dysplasia include irregular lumps or cysts, breast swelling or discomfort, skin redness or thickening, and nipple discharge. Most benign breast conditions do not increase the risk of breast cancer. Also called benign breast disease.
  mammary gland: (MA-muh-ree ...)
    Pronunciation of dictionary term "mammary gland"
    Glandular organ located on the chest. The mammary gland is made up of connective tissue, fat, and tissue that contains the glands that can make milk. Also called breast.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
    Anatomy of the male breast. The nipple and areola are shown on the outside of the breast. The lymph nodes, fatty tissue, ducts, and other parts of the inside of the breast are also shown.
    Anatomy of the male breast; drawing shows the lymph nodes, nipple, areola, chest wall, ribs, muscle, fatty tissue, and ducts.
  mammary Paget disease: (MA-muh-ree PA-jet dih-ZEEZ)
    Pronunciation of dictionary term "mammary Paget disease"
    A rare type of breast cancer that involves the nipple and, usually, the areola (the darker circle of skin around the nipple). Symptoms of mammary Paget disease include itching, tingling, or redness in the nipple and/or areola; flaking, crusty, or thickened skin on or around the nipple; a flattened nipple; and yellowish or bloody discharge from the nipple. The affected breast may also have one or more tumors. Most people with mammary Paget disease also have ductal carcinoma in situ (stage 0 breast cancer) or invasive breast cancer. Also called Paget disease of the breast and Paget disease of the nipple.
    More Information
    - Paget Disease of the Breast (https://www.cancer.gov/types/breast/paget-breast-fact-sheet)
    Paget disease of the breast is a rare type of cancer involving the nipple and usually the areola (the darker circle of skin around the nipple). Symptoms usually include redness in the nipple and/or areola and itchy, crusty, flaking, or thickened skin on or around the nipple.
    Illustration of Paget disease of the breast. Drawing shows a front view of the breast with redness and crusting of the nipple and areola. Also shown is a cross section of the breast with cancer cells in the breast ducts.
  mammogram: (MA-muh-gram)
    Pronunciation of dictionary term "mammogram"
    An x-ray image of the breast used to detect signs of breast cancer or other abnormal breast changes. It is used both for routine screening in women with no symptoms, for diagnosing breast cancer after a lump or other symptoms are detected, and for surveillance after a breast cancer diagnosis.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    Mammography is an imaging test used to screen for and diagnose breast cancer. It can detect abnormal breast tissue, including cancer, sometimes before symptoms appear.
    Drawing of a woman standing with her left breast pressed between two plates of a mammography machine. Behind her, a health professional uses an X-ray machine to take pictures of the breast. An inset shows the X-ray film image with an arrow pointed at abnormal tissue.
  mammography: (ma-MAH-gruh-fee)
    Pronunciation of dictionary term "mammography"
    An imaging method that uses low-dose x-rays to create detailed pictures of the breast. It is used to detect cancer and other breast conditions. During the exam, the breasts are positioned one at a time between an x-ray plate and a plastic compression plate. Each breast is gently pressed between the plates to spread the breast tissue for a clearer image. Images are taken from different angles. Mammography is the most common screening test for breast cancer.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
    Mammography is an imaging test used to screen for and diagnose breast cancer. It can detect abnormal breast tissue, including cancer, sometimes before symptoms appear.
    Drawing of a woman standing with her left breast pressed between two plates of a mammography machine. Behind her, a health professional uses an X-ray machine to take pictures of the breast. An inset shows the X-ray film image with an arrow pointed at abnormal tissue.
  MammoSite: (MA-moh-site)
    Pronunciation of dictionary term "MammoSite"
    A system used to deliver internal radiation therapy to breast cancer patients after surgery to remove their cancer. MammoSite targets only the part of the breast where the cancer was found. After a patient has had a lumpectomy to remove the cancer, a small balloon on the end of a catheter (thin tube) is inserted into the empty space left by the surgery. The balloon is then filled with liquid and left in place. Using the catheter, radioactive seeds are put into the balloon twice a day for five days and removed each time. Once treatment has ended, the catheter and balloon are removed. MammoSite is a type of intracavitary brachytherapy and partial breast irradiation therapy (PBRT). Also called balloon catheter radiation.
  MAMMOTOME: (MA-moh-tome)
    Pronunciation of dictionary term "Mammotome"
    A device that uses a computer-guided probe to perform breast biopsies. A biopsy procedure using the MAMMOTOME device can be done on an outpatient basis with a local anesthetic, removes only a small amount of healthy tissue, and doesn’t require sutures (stitches) because the incision is very small. MAMMOTOME is a registered trademark of Devicor Medical Products, Inc.
  mandible: (MAN-dih-bul)
    Pronunciation of dictionary term "mandible"
    The mandible is the largest and strongest bone in the face. It forms the lower part of the jaw and part of the mouth. The mandible is the only moveable bone of the skull and is attached to muscles involved in chewing and other mouth movements. It also holds the bottom teeth in place. Also called lower jaw bone.
  manipulative and body-based practice: (muh-NIP-yoo-luh-tiv ... BAH-dee-bayst PRAK-tis)
    Pronunciation of dictionary term "manipulative and body-based practice"
    A type of therapy in which the therapist moves or manipulates one or more parts of the patient’s body. It may be used to treat pain, stress, anxiety, and depression, and for general well-being. Examples include chiropractic treatments, physical therapy, and massage therapy. Also called manual healing and physical touch methods.
  mannitol: (MA-nih-TOL)
    Pronunciation of dictionary term "mannitol"
    A drug used to decrease swelling of the brain and to treat kidney failure. Mannitol can also be used to open the blood-brain barrier, which allows anticancer medicines to enter the brain and treat brain tumors.
  mantle cell lymphoma: (MAN-tul sel lim-FOH-muh)
    Pronunciation of dictionary term "mantle cell lymphoma"
    An aggressive (fast-growing) type of B-cell non-Hodgkin lymphoma that usually occurs in middle-aged or older adults. It is marked by small- to medium-size cancer cells that may be in the lymph nodes, spleen, bone marrow, blood, and gastrointestinal system.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  mantle field: (MAN-tul ...)
    Pronunciation of dictionary term "mantle field"
    The area of the neck, chest, and lymph nodes in the armpit that are exposed to radiation.
  manual healing: (MAN-yoo-ul HEE-ling)
    Pronunciation of dictionary term "manual healing"
    A type of therapy in which the therapist moves or manipulates one or more parts of the patient’s body. It may be used to treat pain, stress, anxiety, and depression, and for general well-being. Examples include chiropractic treatments, physical therapy, and massage therapy. Also called manipulative and body-based practice and physical touch methods.
  MAO inhibitor: (... in-HIH-bih-ter)
    Pronunciation of dictionary term "MAO inhibitor"
    A type of drug used to treat depression. It stops the breakdown of certain chemicals in the brain that help improve a person’s mood. A MAO inhibitor is a type of antidepressant. Also called monoamine oxidase inhibitor.
  MAP: A rare, inherited disorder in which multiple polyps (abnormal growths) form on the inner walls of the colon and rectum. People with MAP usually develop fewer than 100 colon polyps, and polyps may also occur in the stomach and small intestine. People with MAP have a high risk of developing colorectal cancer. They may also be at increased risk of developing cancers of the stomach, small intestine, ovary, endometrium, bladder, liver, thyroid, and skin. MAP is caused by mutations (changes) in the MUTYH gene that are inherited in an autosomal recessive manner. It is a type of hereditary cancer syndrome. Also called MUTYH-associated polyposis.
    More Information
    - MYH-associated polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10805/myh-associated-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  MAP2K gene: (... jeen)
    Pronunciation of dictionary term "MAP2K gene"
    A member of a group of genes that make proteins that send chemical signals from outside the cell to the cell's nucleus to control many important cell functions, including cell growth, maturation, movement, and survival. Mutations (changes) in MAP2K genes can cause these proteins to be too active or found in higher-than-normal amounts on cancer cells. This may cause cancer cells to grow and spread. Drugs that block the mutant proteins made by MAP2K genes are used to treat many types of cancer. Also called MEK gene.
  mapatumumab: (ma-puh-TOO-moo-mab)
    Pronunciation of dictionary term "mapatumumab"
    A substance being studied in the treatment of some types of cancer. It binds to a protein called TRAIL R1 on the surface of some tumor cells. This may kill the tumor cells. Mapatumumab is a type of monoclonal antibody. Also called anti-TRAIL R1-mAb and HGS-ETR1.
  Marcaine: (MAR-kane)
    Pronunciation of dictionary term "Marcaine"
    A drug used to relieve pain by blocking signals at nerve endings. It is being studied in the relief of pain following surgery for cancer. It is a type of local anesthetic. Also called bupivacaine hydrochloride and Sensorcaine.
  Marfan syndrome: (MAR-fan SIN-drome)
    Pronunciation of dictionary term "Marfan syndrome"
    A genetic condition that affects the connective tissue in many organs and tissues in the body, especially the heart, eyes, bones, joints, and blood vessels, including the aorta. People with Marfan syndrome are often tall and thin, have very long arms, legs, fingers, and toes, and have heart and vision problems. Other common signs and symptoms include a long and narrow face, crowded teeth, curved spine, loose joints, stretch marks in the skin, and chest abnormalities. Marfan syndrome may be inherited (passed from parent to child) and is caused by a mutation (change) in a gene called FBN1.
    More Information
    - Marfan syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6975/marfan-syndrome)
    - Marfan syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/marfan-syndrome/)
  Margenza: (mar-GEN-zuh)
    Pronunciation of dictionary term "Margenza"
    A drug used with other drugs to treat adults with HER2-positive breast cancer that has spread to other parts of the body. It is used in patients who have already received at least two anti-HER2 treatments, including at least one for metastatic disease. It is also being studied in the treatment of other types of cancer. Margenza binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Margenza is a type of monoclonal antibody. Also called margetuximab.
  margetuximab: (MAR-jeh-TUK-sih-mab)
    Pronunciation of dictionary term "margetuximab"
    A drug used with other drugs to treat adults with HER2-positive breast cancer that has spread to other parts of the body. It is used in patients who have already received at least two anti-HER2 treatments, including at least one for metastatic disease. It is also being studied in the treatment of other types of cancer. Margetuximab binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Margetuximab is a type of monoclonal antibody. Also called Margenza.
  margin: (MAR-jin)
    Pronunciation of dictionary term "margin"
    The edge or border of the tissue removed in cancer surgery. The margin is described as negative or clean when the pathologist finds no cancer cells at the edge of the tissue, suggesting that all of the cancer has been removed. The margin is described as positive or involved when the pathologist finds cancer cells at the edge of the tissue, suggesting that all of the cancer has not been removed.
  marginal zone B-cell lymphoma: (MAR-jih-nul zone B-sel lim-FOH-muh)
    Pronunciation of dictionary term "marginal zone B-cell lymphoma"
    An indolent (slow-growing) type of B-cell non-Hodgkin lymphoma that begins forming in certain areas (the marginal zones) of lymph tissue. There are three types based on whether it forms in the spleen, lymph nodes, or other lymphoid tissue that contains a lot of B cells (a type of white blood cell). Also called marginal zone lymphoma and MZL.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  marginal zone lymphoma: (MAR-jih-nul zone lim-FOH-muh)
    Pronunciation of dictionary term "marginal zone lymphoma"
    An indolent (slow-growing) type of B-cell non-Hodgkin lymphoma that begins forming in certain areas (the marginal zones) of lymph tissue. There are three types based on whether it forms in the spleen, lymph nodes, or other lymphoid tissue that contains a lot of B cells (a type of white blood cell). Also called marginal zone B-cell lymphoma and MZL.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  maribavir: (mar-I-buh-veer)
    Pronunciation of dictionary term "maribavir"
    A substance that blocks the ability of viruses to make new viruses and infect cells. It is being studied in the prevention of cytomegalovirus infection in cancer patients who have had a donor stem cell transplant. It is a type of antiviral agent.
  marijuana: (MAYR-ih-WAH-nuh)
    Pronunciation of dictionary term "marijuana"
    The dried leaves and flowering tops of the Cannabis sativa or Cannabis indica plant. Marijuana contains active chemicals called cannabinoids that cause drug-like effects all through the body, including the central nervous system and the immune system. Marijuana may help treat the symptoms of cancer or the side effects of cancer treatment, such as nausea and vomiting, pain, and cachexia (loss of body weight and muscle mass). Also called Cannabis.
    More Information
    - Cannabis and Cannabinoids
  marimastat: (muh-RIH-muh-stat)
    Pronunciation of dictionary term "marimastat"
    An anticancer drug that belongs to the family of drugs called angiogenesis inhibitors. Marimastat is a matrix metalloproteinase inhibitor.
  marker: (MAR-ker)
    Pronunciation of dictionary term "marker"
    A diagnostic indication that disease may develop.
  Marqibo: (MAR-kee-boh)
    Pronunciation of dictionary term "Marqibo"
    A form of the anticancer drug vincristine sulfate that is contained inside very tiny, fat-like particles and is used to treat adults with acute lymphoblastic leukemia that is Philadelphia chromosome negative and has come back or has not gotten better with other treatment. Marqibo may have fewer side effects and work better than other forms of vincristine sulfate. It is also being studied in the treatment of other types of cancer. Marqibo stops cancer cells from growing and dividing and may kill them. It is a type of vinca alkaloid. Also called liposomal vincristine sulfate and vincristine sulfate liposome.
    More Information
    - Vincristine Sulfate Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/vincristine-sulfate-liposome)
  MART-1 antigen: (... AN-tih-jen)
    Pronunciation of dictionary term "MART-1 antigen"
    A protein found on normal melanocytes (cells that make the pigment melanin) in the skin and in the retina. It is also found on most melanomas (cancers that begin in melanocytes). Vaccines using pieces of the MART-1 antigen are being studied for their ability to boost the immune response to cancer cells in patients with melanoma. Also called Melan-A protein and Melanoma Antigen Recognized by T cells 1.
  masoprocol: (muh-SOH-proh-kol)
    Pronunciation of dictionary term "masoprocol"
    A drug put on the skin to treat growths caused by sun exposure. A form of masoprocol that is taken by mouth is being studied in the treatment of prostate cancer. Masoprocol is an antioxidant, and it may block certain enzymes needed for tumor growth. Also called Actinex, NDGA, and nordihydroguaiaretic acid.
  mass: (mas)
    Pronunciation of dictionary term "mass"
    In medicine, a lump in the body. It may be caused by the abnormal growth of cells, a cyst, hormonal changes, or an immune reaction. A mass may be benign (not cancer) or malignant (cancer).
  massage therapy: (muh-SAZH THAYR-uh-pee)
    Pronunciation of dictionary term "massage therapy"
    A treatment in which the soft tissues of the body are kneaded, rubbed, tapped, and stroked. Massage therapy may help people relax, relieve stress and pain, lower blood pressure, and improve circulation. It is being studied in the treatment of cancer symptoms such as lack of energy, pain, swelling, and depression.
  massively parallel sequencing: (MA-siv-lee PAYR-uh-lel SEE-kwen-sing)
    Pronunciation of dictionary term "massively parallel sequencing"
    A term that describes methods used in the lab to learn the order of building blocks (called nucleotides) for millions of DNA or RNA fragments at the same time. Computers are used to piece together the fragments in order to sequence a person or other organism’s entire DNA, large segments of DNA or RNA, or the DNA in specific types of cells from a sample of tissue. Massively parallel sequencing can also identify changes in certain areas of the genome or in specific genes. There are many different types of massively parallel sequencing methods, including whole-genome sequencing, whole-exome sequencing, multigene panel testing, and transcriptome sequencing. Massively parallel sequencing may help researchers understand the cause of certain diseases, such as cancer. Also called next-generation sequencing and NGS.
  mast cell: (mast sel)
    Pronunciation of dictionary term "mast cell"
    A type of white blood cell that is found in connective tissues all through the body, especially under the skin, near blood vessels and lymph vessels, in nerves, and in the lungs and intestines. Mast cells play an important role in how the immune system responds to certain bacteria and parasites and they help control other types of immune responses. They contain chemicals such as histamine, heparin, cytokines, and growth factors. They release these chemicals during allergic reactions and certain immune responses. These chemicals have many effects, including the widening of blood vessels and angiogenesis. During an allergic response, they can cause flushing (a hot, red face) and itching. In large amounts, they can also cause abdominal cramps, muscle pain, nausea, vomiting, diarrhea, low blood pressure, and shock. Mast cells are part of the body’s immune system.
  mast cell leukemia: (mast sel loo-KEE-mee-uh)
    Pronunciation of dictionary term "mast cell leukemia"
    A very rare, aggressive (fast-growing) type of systemic mastocytosis in which too many immature mast cells (a type of white blood cell) are found in the bone marrow and blood. It may develop in patients who have a buildup of mast cells caused by a condition called aggressive systemic mastocytosis. Mast cell leukemia is hard to treat and has a poor prognosis (outcome).
  mast cell tumor: (mast sel TOO-mer)
    Pronunciation of dictionary term "mast cell tumor"
    A growth or lump of mast cells (a type of white blood cell). Mast cell tumors can involve the skin, subcutaneous tissue, and muscle tissue. Also called mastocytoma.
  mastalgia: (mas-TAL-juh)
    Pronunciation of dictionary term "mastalgia"
    Pain or discomfort in one or both breasts. The pain can be mild or severe and affect one area of the breast or the whole breast, including under the arm. It may also come from nearby muscles or joints outside the breast. Mastalgia in women is most often caused by hormone changes before and during the menstrual cycle. It may also be unrelated to the menstrual cycle, with causes that include pregnancy, breastfeeding, smoking, too much caffeine or fat in the diet, certain medicines, breast surgery, injury to the breast or chest wall, or certain breast conditions. It is rarely caused by breast cancer. Mastalgia can occur in both women and men. Also called breast pain.
  mastectomy: (ma-STEK-toh-mee)
    Pronunciation of dictionary term "mastectomy"
    Surgery to remove part or all of the breast. There are different types of mastectomy that differ in the amount of tissue and lymph nodes removed.
    More Information
    - Breast Cancer Treatment
    Total (simple) mastectomy. The whole breast is removed. Some of the lymph nodes under the arm may also be removed.
    Total (simple) mastectomy; drawing shows removal of the whole breast and some of the lymph nodes under the arm.
  mastitis: (ma-STY-tis)
    Pronunciation of dictionary term "mastitis"
    A condition in which breast tissue is inflamed. It is usually caused by an infection and is most often seen in nursing mothers.
  mastocytoma: (MAS-toh-sy-TOH-muh)
    Pronunciation of dictionary term "mastocytoma"
    A growth or lump of mast cells (a type of white blood cell). Mast cell tumors can involve the skin, subcutaneous tissue, and muscle tissue. Also called mast cell tumor.
  maternal: (muh-TER-nul)
    Pronunciation of dictionary term "maternal"
    Having to do with the mother, coming from the mother, or related through the mother.
  matrix metalloproteinase: (MAY-trix meh-TA-loh-PROH-tee-nays)
    Pronunciation of dictionary term "matrix metalloproteinase"
    A member of a group of enzymes that can break down proteins, such as collagen, that are normally found in the spaces between cells in tissues (i.e., extracellular matrix proteins). Because these enzymes need zinc or calcium atoms to work properly, they are called metalloproteinases. Matrix metalloproteinases are involved in wound healing, angiogenesis, and tumor cell metastasis.
  matted lymph nodes: (MA-ted limf nodes)
    Pronunciation of dictionary term "matted lymph nodes"
    A group of fused lymph nodes. Matted lymph nodes may be a sign of certain conditions, such as infection, sarcoidosis, or lymphoma. They also may be a sign of cancer that has spread to the lymph nodes.
  Matulane: (MA-choo-layn)
    Pronunciation of dictionary term "Matulane"
    A drug used with other drugs to treat advanced Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Matulane damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called procarbazine hydrochloride.
    More Information
    - Procarbazine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/procarbazinehydrochloride)
  mature T-cell lymphoma: (muh-CHOOR T-sel lim-FOH-muh)
    Pronunciation of dictionary term "mature T-cell lymphoma"
    One of a group of aggressive (fast-growing) non-Hodgkin lymphomas that begin in mature T lymphocytes (T cells that have matured in the thymus gland and gone to other lymphatic sites in the body, including lymph nodes, bone marrow, and spleen). Also called peripheral T-cell lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  mature teratoma: (muh-CHOOR TAYR-uh-TOH-muh)
    Pronunciation of dictionary term "mature teratoma"
    A type of germ cell tumor that is usually made up of several different types of tissue, such as hair, muscle, and bone. Mature teratomas have cells that look almost like normal cells under a microscope. Some mature teratomas make enzymes or hormones that may cause signs and symptoms of disease. They are benign (not cancer) but may come back after being removed by surgery. Mature teratomas usually occur in the sacrum or tailbone in newborns or in the testicles or ovaries at the start of puberty. They are often called dermoid cysts.
  Maxamine: (MAK-suh-meen)
    Pronunciation of dictionary term "Maxamine"
    A substance being studied in the treatment of some types of cancer and other conditions. When used together with interleukin-2, Maxamine may help some immune cells find and kill tumor cells. It is a type of biological response modifier. Also called histamine dihydrochloride.
  maxilla: (mak-SIH-luh)
    Pronunciation of dictionary term "maxilla"
    The bones that form the upper part of the jaw, the roof of the mouth, and parts of the eye socket and nose. The maxilla holds the top teeth in place and supports muscles involved in chewing and facial expressions. It is a major bone in the face. Also called upper jaw.
  maxillary sinus: (MAK-sih-LAYR-ee SY-nus)
    Pronunciation of dictionary term "maxillary sinus"
    A type of paranasal sinus (a hollow space in the bones around the nose). There are two large maxillary sinuses, one in each of the maxillary bones, which are in the cheek area next to the nose. The maxillary sinuses are lined with cells that make mucus to keep the nose from drying out.
    Anatomy of the paranasal sinuses (spaces between the bones around the nose).
    Anatomy of the paranasal sinuses; drawing shows front and side views of the frontal sinus, ethmoid sinus, maxillary sinus, and sphenoid sinus. The nasal cavity and pharynx (throat) are also shown.
  maximum inspiratory pressure test: (MAK-sih-mum in-SPY-ruh-TOR-ee PREH-sher…)
    Pronunciation of dictionary term "maximum inspiratory pressure test"
    A test that measures the strength of the muscles used in breathing. A person inhales and exhales through a device called a manometer, and the pressures are recorded by a computer. Also called MIP test.
  maximum tolerated dose: (MAK-sih-mum TAH-leh-RAY-ted …)
    Pronunciation of dictionary term "maximum tolerated dose"
    The highest dose of a drug or treatment that does not cause unacceptable side effects. The maximum tolerated dose is determined in clinical trials by testing increasing doses on different groups of people until the highest dose with acceptable side effects is found. Also called MTD.
  Mayo Clinic regimen: (MAY-oh KLIH-nik REH-jih-men)
    Pronunciation of dictionary term "Mayo Clinic regimen"
    A chemotherapy combination used to treat colorectal cancer. It is also used with radiation therapy to treat esophageal cancer and stomach cancer. It includes the drugs fluorouracil and leucovorin calcium.
  maytansinoid DM4-conjugated humanized monoclonal antibody huC242: (may-TAN-sih-noyd DM4-KON-juh-GAY-ted HYOO-muh-nized MAH-noh-KLOH-nul AN-tee-BAH-dee...)
    Pronunciation of dictionary term "maytansinoid DM4-conjugated humanized monoclonal antibody huC242"
    A substance being studied in the treatment of some types of cancer. It is made by linking the monoclonal antibody huC242 to a toxic substance called maytansinoid DM4. The monoclonal antibody binds to the surfaces of cancer cells and the maytansinoid DM4 enters the cells and blocks their growth. It is a type of immunotoxin. Also called huC242-DM4.
  MBL: A condition in which a higher-than-normal number of identical B cells are found in the blood. People with MBL may develop other B-cell diseases, such as chronic lymphocytic leukemia (CLL). Also called monoclonal B-cell lymphocytosis.
  MC1R: A protein found in skin and eye cells that make melanin (a pigment that gives color to the skin and helps protect it from damage by ultraviolet light). People with certain changes in the gene for MC1R have a higher risk of developing melanoma (skin cancer that begins in melanocytes). Also called melanocortin 1 receptor and melanotropin receptor.
  MC5-A scrambler therapy: (… SKRAM-bler THAYR-uh-pee)
    Pronunciation of dictionary term "MC5-A scrambler therapy"
    A type of treatment for nerve pain that uses electrodes placed on the skin. Electricity is carried from the electrodes through the skin and blocks the pain. The pain may be caused by physical injury, infection, toxic substances, and certain diseases or drugs, including anticancer drugs.
  MCD test: A type of blood test that is being studied as a way to screen for many types of cancer at the same time. MCD tests work by measuring biomarkers, such as pieces of DNA, that cancer cells release into the blood as they die. These tests may help find cancer in parts of the body that are not easily accessible for physical exam or biopsy. MCD tests may be used with other screening tests to help find more cancers before they cause symptoms. MCD tests are a type of liquid biopsy. These tests are sometimes called multi-cancer early detection tests or MCED tests. Also called multi-cancer detection test.
    More Information
    - Questions and Answers about Multi-Cancer Detection Tests (https://prevention.cancer.gov/major-programs/cancer-screening-research-network-csrn/questions-and-answers-about-multi-cancer)
  MDL 101,731: A drug that belongs to a family of drugs called ribonucleotide reductase inhibitors.
  MDR modulator CBT-1: (… MAH-juh-lay-ter …)
    Pronunciation of dictionary term "MDR modulator CBT-1"
    A substance taken from plants that is being studied in the treatment of cancer. It may help drugs kill tumor cells that have become resistant to drugs. It is a type of multidrug resistance inhibitor and a type of P-glycoprotein antagonist. Also called CBT-1.
  MDS: A type of cancer in which the bone marrow does not make enough healthy blood cells (white blood cells, red blood cells, and platelets) and there are abnormal cells in the blood and/or bone marrow. When there are fewer healthy blood cells, infection, anemia, or bleeding may occur. Sometimes, MDS becomes acute myeloid leukemia (AML). Also called myelodysplastic syndrome.
    More Information
    - Myelodysplastic Syndromes Treatment
  MDX-010: A drug that binds to the protein CTLA-4 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that have certain mutations (changes) in genes involved in DNA repair. MDX-010 is used alone or with other drugs to treat certain types of colorectal cancer, esophageal cancer, hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, melanoma, non-small cell lung cancer, and renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. MDX-010 may block CTLA-4 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called ipilimumab and Yervoy.
    More Information
    - Ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
  MDX-060: A monoclonal antibody that is being studied in the treatment of some lymphomas. Monoclonal antibodies are produced in the laboratory and can locate and bind to cancer cells.
  mean: (meen)
    Pronunciation of dictionary term "mean"
    A statistics term. The average value in a set of measurements. The mean is the sum of a set of numbers divided by how many numbers are in the set.
  mean survival: (meen ser-VY-vul)
    Pronunciation of dictionary term "mean survival"
    The average length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, that patients diagnosed with the disease are still alive. In a clinical trial, measuring mean survival is one way to see how well a new treatment works.
  measles virus: (MEE-zulz VY-rus)
    Pronunciation of dictionary term "measles virus"
    The virus that causes measles (a highly contagious disease marked by fever, cough, and raised red spots on the skin). The measles virus usually affects children, and is spread by coughing or contact with fluid from the nose or mouth of someone who has been infected.
  measurable disease: (MEH-zur-uh-bul dih-ZEEZ)
    Pronunciation of dictionary term "measurable disease"
    A tumor that can be accurately measured in size. This information can be used to judge response to treatment.
  measurable residual disease: (MEH-zur-uh-bul ree-ZID-yoo-ul dih-ZEEZ)
    Pronunciation of dictionary term "measurable residual disease"
    A term that is increasingly being used in place of the term minimal residual disease to describe a very small number of cancer cells that remain in the body during or after treatment. Measurable residual disease can be found only by highly sensitive laboratory methods that are able to find one cancer cell among one million normal cells. Checking to see if there is measurable residual disease may help plan treatment, find out how well treatment is working or if cancer has come back, or make a prognosis. Measurable residual disease testing is used mostly for blood cancers such as lymphoma and leukemia. Also called minimal residual disease and MRD.
  mechanism of action: (MEH-kuh-nih-zum … AK-shun)
    Pronunciation of dictionary term "mechanism of action"
    In medicine, a term used to describe how a drug or other substance produces an effect in the body. For example, a drug’s mechanism of action could be how it affects a specific target in a cell, such as an enzyme, or a cell function, such as cell growth. Knowing the mechanism of action of a drug may help provide information about the safety of the drug and how it affects the body. It may also help identify the right dose of a drug and which patients are most likely to respond to treatment. Also called MOA.
  mechanistic target of rapamycin: (meh-kuh-NIS-tik TAR-get … RA-puh-MY-sin)
    Pronunciation of dictionary term "mechanistic target of rapamycin"
    A protein that helps control several cell functions, including cell division and survival, and binds to rapamycin and other drugs. Mecanic target of rapamycin may be more active in some types of cancer cells than it is in normal cells. Blocking mechanistic target of rapamycin may cause the cancer cells to die. It is a type of serine/threonine protein kinase. Also called mammalian target of rapamycin and mTOR.
  mechlorethamine hydrochloride: (meh-klor-EH-thuh-meen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "mechlorethamine hydrochloride"
    A drug used on the skin to treat stage I mycosis fungoides (a type of cutaneous T-cell lymphoma) in patients who have already been treated with other therapy. It is also being studied in the treatment of other types of cancer. Mechlorethamine hydrochloride damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent. Also called mustine and Valchlor.
    More Information
    - Mechlorethamine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/mechlorethaminehydrochloride)
  MEDI-507: A substance being studied in the treatment of certain types of T-cell lymphoma. It is also being studied in the prevention of organ or tissue rejection after a kidney and/or bone marrow transplant. MEDI-507 binds to a protein called CD2, which is found on some types of immune cells and cancer cells. This may help suppress the body’s immune response and it may help kill cancer cells. MEDI-507 is a type of monoclonal antibody. Also called siplizumab.
  MEDI-522: A substance being studied in the treatment of some types of cancer and other conditions. MEDI-522 binds to a protein on the surface of blood vessels and may prevent the growth of new blood vessels that tumors need to grow. It may also prevent the spread of cancer. It is a type of antiangiogenesis agent, a type of metastasis inhibitor, and a type of monoclonal antibody. Also called Abegrin, etaracizumab, and humanized monoclonal antibody MEDI-522.
  medial supraclavicular lymph node: (MEE-dee-ul SOO-pruh-kla-VIH-kyuh-ler...)
    Pronunciation of dictionary term "medial supraclavicular lymph node"
    A lymph node located above the collar bone and between the center of the body and a line drawn through the nipple to the shoulder.
  median: (MEE-dee-un)
    Pronunciation of dictionary term "median"
    A statistics term. The middle value in a set of measurements.
  median overall survival: (MEE-dee-un oh-ver-AWL ser-VY-vul)
    Pronunciation of dictionary term "median overall survival"
    The length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, that half of the patients in a group of patients diagnosed with the disease are still alive. In a clinical trial, measuring the median overall survival is one way to see how well a new treatment works. Also called median survival.
  median survival: (MEE-dee-un ser-VY-vul)
    Pronunciation of dictionary term "median survival"
    The length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, that half of the patients in a group of patients diagnosed with the disease are still alive. In a clinical trial, measuring the median survival is one way to see how well a new treatment works. Also called median overall survival.
  median umbilical ligament: (MEE-dee-un um-BIH-lih-kul LIH-guh-ment)
    Pronunciation of dictionary term "median umbilical ligament"
    A fibrous cord that connects the urinary bladder to the umbilicus (navel). The median umbilical ligament is formed as the allantoic stalk during fetal development and lasts through life. Also called urachus.
  mediastinal pleura: (MEE-dee-uh-STY-nul PLOOR-uh)
    Pronunciation of dictionary term "mediastinal pleura"
    The thin membrane that lines the chest cavity in the area between the lungs.
  mediastinoscope: (MEE-dee-uh-STY-noh-skope)
    Pronunciation of dictionary term "mediastinoscope"
    A thin, tube-like instrument used to examine the tissues and lymph nodes in the area between the lungs. These tissues include the heart and its large blood vessels, trachea, esophagus, and bronchi. The mediastinoscope has a light and a lens for viewing and may also have a tool to remove tissue. It is inserted into the chest through a cut above the breastbone.
    Mediastinoscopy. A mediastinoscope is inserted into the chest through an incision above the breastbone to look for abnormal areas between the lungs. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a cutting tool. Tissue samples may be taken from lymph nodes on the right side of the chest and checked under a microscope for signs of cancer. In an anterior mediastinotomy (Chamberlain procedure), the incision is made beside the breastbone to remove tissue samples from the lymph nodes on the left side of the chest.
    Mediastinoscopy; shows mediastinoscope with light and lens inserted into the chest through an incision above the breastbone. Drawing shows right and left lungs, trachea, and lymph nodes. Inset shows anterior mediastinotomy (Chamberlain procedure) with incision beside the breastbone.
  mediastinoscopy: (MEE-dee-uh-sty-NOS-koh-pee)
    Pronunciation of dictionary term "mediastinoscopy"
    A procedure in which a mediastinoscope is used to examine the organs in the area between the lungs and nearby lymph nodes. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. The mediastinoscope is inserted into the chest through an incision above the breastbone. This procedure is usually done to get a tissue sample from the lymph nodes on the right side of the chest.
    Mediastinoscopy. A mediastinoscope is inserted into the chest through an incision above the breastbone to look for abnormal areas between the lungs. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a cutting tool. Tissue samples may be taken from lymph nodes on the right side of the chest and checked under a microscope for signs of cancer. In an anterior mediastinotomy (Chamberlain procedure), the incision is made beside the breastbone to remove tissue samples from the lymph nodes on the left side of the chest.
    Mediastinoscopy; shows mediastinoscope with light and lens inserted into the chest through an incision above the breastbone. Drawing shows right and left lungs, trachea, and lymph nodes. Inset shows anterior mediastinotomy (Chamberlain procedure) with incision beside the breastbone.
  mediastinum: (MEE-dee-uh-STY-num)
    Pronunciation of dictionary term "mediastinum"
    The area between the lungs. The organs in this area include the heart and its large blood vessels, the trachea, the esophagus, the thymus, and lymph nodes but not the lungs.
  Medicaid: (MEH-dih-kayd)
    Pronunciation of dictionary term "Medicaid"
    A public health insurance program for some people or families with limited incomes and resources, including children, pregnant women, older adults, and people with disabilities. People who receive Medicaid have most or all of their health care services paid for by US federal, state, and local governments. Each state government runs its own Medicaid program using federal guidelines, so Medicaid rules and benefits can differ from state to state. To be eligible for Medicaid, a person or family must meet the Medicaid rules of the state in which they live.
  medical castration: (MEH-dih-kul kas-TRAY-shun)
    Pronunciation of dictionary term "medical castration"
    Refers to the use of drugs to suppress the function of the ovaries or testicles.
  medical device: (MEH-dih-kul dee-VISE)
    Pronunciation of dictionary term "medical device"
    An instrument, tool, machine, test kit, or implant that is used to prevent, diagnose, or treat disease or other conditions. Medical devices range from tongue depressors to heart pacemakers and medical imaging equipment.
  medical history: (MEH-dih-kul HIH-stuh-ree)
    Pronunciation of dictionary term "medical history"
    A record of information about a person’s health. A personal medical history may include information about allergies, illnesses, surgeries, immunizations, and results of physical exams and tests. It may also include information about medicines taken and health habits, such as diet and exercise. A family medical history includes health information about a person’s close family members (parents, grandparents, children, brothers, and sisters). This includes their current and past illnesses. A family medical history may show a pattern of certain diseases in a family. Also called health history.
  medical nutrition therapy: (MEH-dih-kul noo-TRIH-shun THAYR-uh-pee)
    Pronunciation of dictionary term "medical nutrition therapy"
    A nutrition-based treatment plan to help manage or treat certain health conditions. These include diabetes, heart disease, kidney disease, digestive system problems, overweight, obesity, malnutrition, and cancer. Medical nutrition therapy includes assessing a person’s nutrition status, identifying their nutritional and dietary needs and goals, and developing a nutrition care plan. The nutrition care plan may involve changes in a person’s diet, counseling to support behavioral and lifestyle changes, or receiving nutrients through intravenous or tube feeding. Also called nutrition therapy.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  medical oncologist: (MEH-dih-kul on-KAH-loh-jist)
    Pronunciation of dictionary term "medical oncologist"
    A doctor who has special training in diagnosing and treating cancer in adults using chemotherapy, hormonal therapy, biological therapy, and targeted therapy. A medical oncologist often is the main health care provider for someone who has cancer. A medical oncologist also gives supportive care and may coordinate treatment given by other specialists.
    More Information
    - PDQ® Cancer Information Summaries: Adult Treatment (https://www.cancer.gov/publications/pdq/information-summaries/adult-treatment)
  medical power of attorney: (MEH-dih-kul POW-er ... uh-TER-nee)
    Pronunciation of dictionary term "medical power of attorney"
    A type of advance directive that gives a person (called a proxy) the authority to make medical decisions for another person if that person is not able to make their own decisions. A proxy is usually a spouse, relative, friend, or lawyer who knows the person's values, wishes, and treatment preferences. Also called durable power of attorney for health care and health care proxy.
  Medicare: (MEH-dih-kayr)
    Pronunciation of dictionary term "Medicare"
    A U.S. federal health insurance program for people aged 65 and older and some people younger than 65 with certain disabilities or conditions. Medicare pays for hospital stays, medical services, and some prescription drugs, but people who receive Medicare must pay part of their health care costs.
  Medicare Part D: (MEH-dih-kayr …)
    Pronunciation of dictionary term "Medicare Part D"
    A type of insurance that helps people with Medicare pay for prescription drugs. People with Medicare Part D have to pay an additional premium and part of their prescription drug costs, including deductibles and copayments. Medicare Part D is offered by private insurance companies approved by Medicare. It is a type of supplemental health insurance. Also called Medicare Prescription Drug Coverage.
  Medicare Prescription Drug Coverage: (MEH-dih-kayr preh-SKRIP-shun … KUH-ver-ij)
    Pronunciation of dictionary term "Medicare Prescription Drug Coverage"
    A type of insurance that helps people with Medicare pay for prescription drugs. People with Medicare Prescription Drug Coverage have to pay an additional premium and part of their prescription drug costs, including deductibles and copayments. Medicare Prescription Drug Coverage is offered by private insurance companies approved by Medicare. It is a type of supplemental health insurance. Also called Medicare Part D.
  medicated urethral system for erection: (MEH-dih-KAY-ted yoo-REE-thrul SIS-tem … eh-REK-shun)
    Pronunciation of dictionary term "medicated urethral system for erection"
    A method used to treat impotence (inability to have an erection). A suppository, in the form of a very small pellet, is inserted through the tip of the penis into the urethra. The suppository contains the drug alprostadil, which increases the flow of blood to the penis and causes an erection. Also called MUSE.
  medication: (MEH-dih-KAY-shun)
    Pronunciation of dictionary term "medication"
    A dosage form that contains one or more active and/or inactive ingredients. Medications come in many dosage forms, including tablets, capsules, liquids, creams, and patches. They can also be given in different ways, such as by mouth, by infusion into a vein, or by drops that are put into the ear or eye. The form with the active ingredient is used to prevent, diagnose, treat, or relieve symptoms of a disease or abnormal condition. A medication that does not contain an active ingredient and is used in research studies is called a placebo. Also called drug product.
  medicine: (MEH-dih-sin)
    Pronunciation of dictionary term "medicine"
    Refers to the practices and procedures used for the prevention, treatment, or relief of symptoms of diseases or abnormal conditions. This term may also refer to a legal drug used for the same purpose.
  meditation: (MEH-dih-TAY-shun)
    Pronunciation of dictionary term "meditation"
    A mind-body practice in which a person focuses his or her attention on something, such as an object, word, phrase, or breathing, in order to minimize distracting or stressful thoughts or feelings. Meditation may help relax the body and mind and improve overall health and well-being. It may be used to help relieve stress, pain, anxiety, and depression and to help with symptoms related to disease, such as cancer and AIDS. It is a type of complementary and alternative medicine (CAM).
  medroxyprogesterone: (meh-DROK-see-proh-JES-teh-rone)
    Pronunciation of dictionary term "medroxyprogesterone"
    A hormonal anticancer drug that is also used in cancer prevention. It belongs to the family of drugs called progestins.
  medroxyprogesterone acetate: (meh-DROK-see-proh-JES-teh-rone A-seh-tayt)
    Pronunciation of dictionary term "medroxyprogesterone acetate"
    A drug used to prevent endometrial cancer. It is also used to treat menstrual disorders and as a form of birth control. It is a form of the female hormone progesterone and belongs to the family of drugs called progestins.
  medullary breast carcinoma: (MED-yoo-LAYR-ee brest KAR-sih-NOH-muh)
    Pronunciation of dictionary term "medullary breast carcinoma"
    A rare type of breast cancer that often can be treated successfully. It is marked by lymphocytes (a type of white blood cell) in and around the tumor that can be seen when viewed under a microscope.
  medullary thyroid cancer: (MED-yoo-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "medullary thyroid cancer"
    Cancer that develops in C cells of the thyroid. The C cells make a hormone (calcitonin) that helps maintain a healthy level of calcium in the blood.
    More Information
    - Genetics of Endocrine and Neuroendocrine Neoplasias
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
  medulloblastoma: (MED-yoo-loh-blas-TOH-muh)
    Pronunciation of dictionary term "medulloblastoma"
    A fast-growing type of cancer that forms in the cerebellum (the lower, back part of the brain). Medulloblastomas tend to spread through the cerebrospinal fluid to the spinal cord or to other parts of the brain. They may also spread to other parts of the body, but this is rare. Medulloblastomas are most common in children and young adults. They are a type of central nervous system embryonal tumor.
  mega-voltage linear accelerator: (MEH-guh-VOLE-tij LIH-nee-er ak-SEH-leh-RAY-ter)
    Pronunciation of dictionary term "mega-voltage linear accelerator"
    A machine that uses electricity to form a stream of fast-moving subatomic particles. This creates high-energy radiation that may be used to treat cancer. Also called linac, linear accelerator, and MeV linear accelerator.
  Megace: (meh-GAYS)
    Pronunciation of dictionary term "Megace"
    A drug used to treat advanced breast and endometrial cancer. It is also used to treat anorexia (loss of appetite) and cachexia (weakness and loss of body weight and muscle mass) in patients with AIDS. It is also being studied in the treatment of anorexia and cachexia in patients with cancer or other conditions. Megace blocks the effects of the hormone estrogen in the body, which may help keep some cancer cells from growing. It may also improve appetite. Megace is a type of progestin. Also called megestrol acetate.
  megestrol acetate: (meh-JES-trol A-seh-tayt)
    Pronunciation of dictionary term "megestrol acetate"
    A drug used in tablet form to relieve the symptoms of advanced breast cancer and endometrial cancer. It is also being studied in the treatment of other conditions and types of cancer. Megestrol acetate blocks the effects of the hormone estrogen in the body, which may help keep some cancer cells from growing. It is a type of progestin.
    More Information
    - Megestrol Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/megestrolacetate)
  meiosis: (my-OH-sis)
    Pronunciation of dictionary term "meiosis"
    A special form of cell division in which each daughter cell receives half the amount of DNA as the parent cell. Meiosis occurs during formation of egg and sperm cells in mammals.
  MEK gene: (... jeen)
    Pronunciation of dictionary term "MEK gene "
    A member of a group of genes that make proteins that send chemical signals from outside the cell to the cell's nucleus to control many important cell functions, including cell growth, maturation, movement, and survival. Mutations (changes) in MEK genes can cause these proteins to be too active or found in higher-than-normal amounts on cancer cells. This may cause cancer cells to grow and spread. Drugs that block the mutant proteins made by MEK genes are used to treat many types of cancer. Also called MAP2K gene.
  MEK inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "MEK inhibitor"
    A substance that blocks proteins called MEK1 and MEK2, which help control cell growth and survival. Blocking these proteins may help keep cancer cells from growing and may kill them. Some MEK inhibitors are used to treat cancer. They are a type of targeted therapy.
  MEK inhibitor AZD6244: (... in-HIH-bih-ter...)
    Pronunciation of dictionary term "MEK inhibitor AZD6244"
    A drug used to treat children aged 2 years and older with a rare genetic condition called neurofibromatosis type 1. It is used in patients who have plexiform neurofibromas that are causing symptoms and cannot be removed by surgery. It is also being studied in the treatment of some types of cancer. MEK inhibitor AZD6244 blocks proteins called MEK1 and MEK2, which may help keep abnormal cells or cancer cells from growing. It is a type of kinase inhibitor. Also called AZD6244, Koselugo, and selumetinib sulfate.
    More Information
    - Selumetinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/selumetinibsulfate)
  MEK1 protein: (… PROH-teen)
    Pronunciation of dictionary term "MEK1 protein"
    A protein involved in a cell signaling pathway that helps control cell division, cell maturation, and cell death. Mutations (changes) in the gene that makes the MEK1 protein or in other genes in this signaling pathway may cause the MEK1 protein to become overactive in some types of cancer. This may increase the growth of cancer cells. Drugs that block the MEK1 protein are being used in the treatment of some cancers.
  MEK2 protein: (… PROH-teen)
    Pronunciation of dictionary term "MEK2 protein"
    A protein involved in a cell signaling pathway that helps control cell division, cell maturation, and cell death. Mutations (changes) in the gene that makes the MEK2 protein or in other genes in this signaling pathway may cause the MEK2 protein to become overactive in some types of cancer. This may increase the growth of cancer cells. Drugs that block the MEK2 protein are being used in the treatment of some cancers.
  Mekinist: (MEH-kih-nist)
    Pronunciation of dictionary term "Mekinist"
    A drug used alone or with dabrafenib to treat low-grade glioma (a type of brain tumor) in children aged 1 year and older and certain types of anaplastic thyroid cancer, non-small cell lung cancer, melanoma, and other solid tumors that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Mekinist blocks proteins called MEK1 and MEK2, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called trametinib dimethyl sulfoxide.
    More Information
    - Trametinib Dimethyl Sulfoxide (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib)
  Mektovi: (mek-TOH-vee)
    Pronunciation of dictionary term "Mektovi"
    A drug used with encorafenib to treat melanoma that has spread or cannot be removed by surgery and has a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Mektovi blocks proteins called MEK1 and MEK2, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called binimetinib.
    More Information
    - Binimetinib (https://www.cancer.gov/about-cancer/treatment/drugs/binimetinib)
  Melan-A protein: (MEH-lun … PROH-teen)
    Pronunciation of dictionary term "Melan-A protein"
    A protein found on normal melanocytes (cells that make the pigment melanin) in the skin and in the retina. It is also found on most melanomas (cancers that begin in melanocytes). Vaccines using pieces of the Melan-A protein are being studied for their ability to boost the immune response to cancer cells in patients with melanoma. Also called MART-1 antigen and Melanoma Antigen Recognized by T cells 1.
  melanin: (MEH-luh-nin)
    Pronunciation of dictionary term "melanin"
    A pigment that gives color to skin and eyes and helps protect it from damage by ultraviolet light.
  melanocortin 1 receptor: (MEH-luh-noh-KOR-tin 1 reh-SEP-ter)
    Pronunciation of dictionary term "melanocortin 1 receptor"
    A protein found in skin and eye cells that make melanin (a pigment that gives color to the skin and helps protect it from damage by ultraviolet light). People with certain changes in the gene for melanocortin 1 receptor have a higher risk of developing melanoma (skin cancer that begins in melanocytes). Also called MC1R and melanotropin receptor.
  melanocyte: (meh-LAN-oh-site)
    Pronunciation of dictionary term "melanocyte"
    A cell in the skin and eyes that produces and contains the pigment called melanin.
    Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue. Melanocytes are in the layer of basal cells at the deepest part of the epidermis.
    Anatomy of the skin with melanocytes; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the squamous cell and basal cell layers of the epidermis above the dermis with blood vessels. Melanin is shown in the cells. A melanocyte is shown in the layer of basal cells at the deepest part of the epidermis.
  melanoma: (MEH-luh-NOH-muh)
    Pronunciation of dictionary term "melanoma"
    A form of cancer that begins in melanocytes (cells that make the pigment melanin). It may begin in a mole (skin melanoma), but can also begin in other pigmented tissues, such as in the eye or in the intestines.
    More Information
    - Skin Cancer (Including Melanoma) (https://www.cancer.gov/types/skin)
    Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue. Melanocytes are in the layer of basal cells at the deepest part of the epidermis.
    Anatomy of the skin with melanocytes; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the squamous cell and basal cell layers of the epidermis above the dermis with blood vessels. Melanin is shown in the cells. A melanocyte is shown in the layer of basal cells at the deepest part of the epidermis.
  melanoma and neural system tumor syndrome: (MEH-luh-NOH-muh … NOOR-ul SIS-tem TOO-mer SIN-drome)
    Pronunciation of dictionary term "melanoma and neural system tumor syndrome"
    An extremely rare, inherited disorder in which affected people have an increased risk of developing melanoma and nervous system tumors, especially astrocytoma (a type of brain tumor). The tumors tend to develop at an early age, and one or both types of tumors may occur in the same person. Melanoma and neural system tumor syndrome is caused by mutations (changes) in the CDKN2A gene. Also called melanoma-astrocytoma syndrome.
  Melanoma Antigen Recognized by T cells 1: (MEH-luh-NOH-muh AN-tih-jen REH-kug-NIZED …)
    Pronunciation of dictionary term "Melanoma Antigen Recognized by T cells 1"
    A protein found on normal melanocytes (cells that make the pigment melanin) in the skin and in the retina. It is also found on most melanomas (cancers that begin in melanocytes). Vaccines using pieces of the Melanoma Antigen Recognized by T cells 1 are being studied for their ability to boost the immune response to cancer cells in patients with melanoma. Also called MART-1 antigen and Melan-A protein.
  melanoma in situ: (MEH-luh-NOH-muh in SY-too)
    Pronunciation of dictionary term "melanoma in situ"
    Abnormal melanocytes (cells that make melanin, the pigment that gives skin its natural color) are found in the epidermis (outer layer of the skin). These abnormal melanocytes may become cancer and spread into nearby normal tissue. Also called stage 0 melanoma.
    More Information
    - Melanoma Treatment
    Stage 0 melanoma. Abnormal melanocytes are found in the epidermis (outer layer of the skin). These abnormal melanocytes may become cancer and spread into nearby normal tissue.
    Stage 0 melanoma; drawing shows an abnormal area on the surface of the skin and abnormal melanocytes in the epidermis (outer layer of the skin). Also shown are the dermis (inner layer of the skin) and the subcutaneous tissue below the dermis.
  melanoma vaccine: (MEH-luh-NOH-muh vak-SEEN)
    Pronunciation of dictionary term "melanoma vaccine"
    A cancer vaccine prepared from human melanoma cancer cells. It can be used alone or with other therapy in treating melanoma.
  melanoma-astrocytoma syndrome: (MEH-luh-NOH-muh-AS-troh-sy-TOH-muh SIN-drome)
    Pronunciation of dictionary term "melanoma-astrocytoma syndrome"
    An extremely rare, inherited disorder in which affected people have an increased risk of developing melanoma and nervous system tumors, especially astrocytoma (a type of brain tumor). The tumors tend to develop at an early age, and one or both types of tumors may occur in the same person. Melanoma-astrocytoma syndrome is caused by mutations (changes) in the CDKN2A gene. Also called melanoma and neural system tumor syndrome.
  melanotropin receptor: (MEH-luh-noh-TROH-pin reh-SEP-ter)
    Pronunciation of dictionary term "melanotropin receptor"
    A protein found in skin and eye cells that make melanin (a pigment that gives color to the skin and helps protect it from damage by ultraviolet light). People with certain changes in the gene for melanotropin receptor have a higher risk of developing melanoma (skin cancer that begins in melanocytes). Also called MC1R and melanocortin 1 receptor.
  melatonin: (MEH-luh-TOH-nin)
    Pronunciation of dictionary term "melatonin"
    A hormone made by the pineal gland (tiny organ near the center of the brain). Melatonin helps control the body’s sleep cycle, and is an antioxidant. It is also made in the laboratory and sold as a supplement.
  melflufen: (MEL-floo-fen)
    Pronunciation of dictionary term "melflufen"
    A drug used with dexamethasone to treat adults with multiple myeloma that relapsed (came back) or did not get better after treatment with at least four other anticancer therapies, including an anti-CD38 monoclonal antibody, a proteasome inhibitor, and an immunomodulating agent. It is also being studied in the treatment of other types of cancer. Melflufen may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of peptide-conjugated alkylating drug. Also called melphalan flufenamide hydrochloride and Pepaxto.
    More Information
    - Melphalan Flufenamide Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalanflufenamidehydrochloride)
  melphalan: (MEL-fuh-lan)
    Pronunciation of dictionary term "melphalan"
    A drug used to treat multiple myeloma and ovarian epithelial cancer that cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Melphalan may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called Alkeran Tablets.
    More Information
    - Melphalan (https://www.cancer.gov/about-cancer/treatment/drugs/melphalan)
  melphalan flufenamide hydrochloride: (MEL-fuh-lan floo-FEH-nuh-mide HY-droh-KLOR-ide)
    Pronunciation of dictionary term "melphalan flufenamide hydrochloride"
    A drug used with dexamethasone to treat adults with multiple myeloma that relapsed (came back) or did not get better after treatment with at least four other anticancer therapies, including an anti-CD38 monoclonal antibody, a proteasome inhibitor, and an immunomodulating agent. It is also being studied in the treatment of other types of cancer. Melphalan flufenamide hydrochloride may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of peptide-conjugated alkylating drug. Also called melflufen and Pepaxto.
    More Information
    - Melphalan Flufenamide Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalanflufenamidehydrochloride)
  melphalan hydrochloride: (MEL-fuh-lan HY-droh-KLOR-ide)
    Pronunciation of dictionary term "melphalan hydrochloride"
    A drug used to treat certain types of multiple myeloma and uveal melanoma (a type of eye cancer). An infusion of one form of melphalan hydrochloride is used as palliative therapy to treat multiple myeloma in patients who cannot take melphalan by mouth. Other forms of melphalan hydrochloride are used under the brand name Evomela to prepare patients with multiple myeloma for a stem cell transplant and under the brand name Hepzato to treat adults with uveal melanoma that has spread to less than half of the liver and cannot be removed by surgery. Hepzato is given as an infusion directly into an artery that leads to the liver. Melphalan hydrochloride is also being studied in the treatment of other types of cancer. It may kill cancer cells by damaging their DNA and stopping them from dividing. Melphalan hydrochloride is a type of alkylating agent.
    More Information
    - Melphalan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalan-hydrochloride)
  memantine hydrochloride: (MEH-mun-teen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "memantine hydrochloride"
    A drug used to treat dementia caused by Alzheimer disease. It is also being studied in the treatment of side effects from whole-brain radiation therapy for cancer and other conditions. Memantine hydrochloride blocks the uptake of calcium by certain brain cells and decreases their activity. It is a type of N-methyl-D-asparatate (NMDA) receptor antagonist. Also called Namenda.
  membrane: (MEM-brayn)
    Pronunciation of dictionary term "membrane"
    A very thin layer of tissue that covers a surface.
  MEN syndrome: (... SIN-drome)
    Pronunciation of dictionary term "MEN syndrome"
    An inherited condition that may result in the development of cancers of the endocrine system. There are several types of MEN syndrome, and patients with each type may develop different types of cancer. The altered genes that cause each type can be detected with a blood test. Also called multiple endocrine neoplasia syndrome.
    More Information
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 1 (MEN1) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN1 syndrome usually causes pituitary gland, parathyroid gland, or pancreas tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN1 syndrome, including the pituitary gland, parathyroid glands, and pancreas. There is also an inset that shows the back view of the thyroid gland with the four pea-sized parathyroid glands.
    Multiple endocrine neoplasia 2 (MEN2) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN2 syndrome usually causes thyroid gland, parathyroid gland, or adrenal gland tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN2 syndrome, including the thyroid gland, parathyroid glands, and adrenal gland. There are also two insets: one showing the back view of the thyroid gland with the four pea-sized parathyroid glands, and the other showing the inner part of the adrenal gland called the adrenal medulla.
  MEN-10755: An anticancer drug that belongs to the family of drugs called antitumor antibiotics.
  MEN1 syndrome: (... SIN-drome)
    Pronunciation of dictionary term "MEN1 syndrome"
    A rare, inherited disorder that affects the endocrine glands and can cause tumors in the parathyroid and pituitary glands and the pancreas. These tumors are usually benign (not cancer). They cause the glands to secrete high levels of hormones, which can lead to other medical problems, such as kidney stones, fertility problems, and severe ulcers. In some cases, tumors inside the pancreas can become malignant (cancer). Also called multiple endocrine adenomatosis, multiple endocrine neoplasia type 1 syndrome, and Wermer syndrome.
    More Information
    - Multiple endocrine neoplasia type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3829/multiple-endocrine-neoplasia-type-1)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 1 (MEN1) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN1 syndrome usually causes pituitary gland, parathyroid gland, or pancreas tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN1 syndrome, including the pituitary gland, parathyroid glands, and pancreas. There is also an inset that shows the back view of the thyroid gland with the four pea-sized parathyroid glands.
  MEN2: A rare, genetic disorder that affects the endocrine glands and can cause tumors in the thyroid gland, parathyroid glands, and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. MEN2 is caused by a mutation (change) in a gene called RET, and is divided into three subtypes (MEN2A, MEN2B, and FMTC). People with all subtypes of MEN2 have an increased risk of medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. Also called MEN2 syndrome, multiple endocrine adenomatosis type 2, and multiple endocrine neoplasia type 2 syndrome.
    More Information
    - Multiple endocrine neoplasia type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3830/men2)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 2 (MEN2) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN2 syndrome usually causes thyroid gland, parathyroid gland, or adrenal gland tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN2 syndrome, including the thyroid gland, parathyroid glands, and adrenal gland. There are also two insets: one showing the back view of the thyroid gland with the four pea-sized parathyroid glands, and the other showing the inner part of the adrenal gland called the adrenal medulla.
  MEN2 syndrome: (... SIN-drome)
    Pronunciation of dictionary term "MEN2 syndrome"
    A rare, genetic disorder that affects the endocrine glands and can cause tumors in the thyroid gland, parathyroid glands, and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. MEN2 syndrome is caused by a mutation (change) in a gene called RET, and is divided into three subtypes (MEN2A, MEN2B, and FMTC). People with all subtypes of MEN2 syndrome have an increased risk of medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. Also called MEN2, multiple endocrine adenomatosis type 2, and multiple endocrine neoplasia type 2 syndrome.
    More Information
    - Multiple endocrine neoplasia type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3830/men2)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 2 (MEN2) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN2 syndrome usually causes thyroid gland, parathyroid gland, or adrenal gland tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN2 syndrome, including the thyroid gland, parathyroid glands, and adrenal gland. There are also two insets: one showing the back view of the thyroid gland with the four pea-sized parathyroid glands, and the other showing the inner part of the adrenal gland called the adrenal medulla.
  MEN2A: A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the parathyroid glands and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. An itchy skin condition may also occur. MEN2A is caused by a mutation (change) in a gene called RET. Also called MEN2A syndrome, multiple endocrine adenomatosis type 2A, multiple endocrine neoplasia type 2A syndrome, and Sipple syndrome.
    More Information
    - Multiple endocrine neoplasia type 2A (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4881/multiple-endocrine-neoplasia-type-2a)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  MEN2A syndrome: (... SIN-drome)
    Pronunciation of dictionary term "MEN2A syndrome"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the parathyroid glands and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. An itchy skin condition may also occur. MEN2A syndrome is caused by a mutation (change) in a gene called RET. Also called MEN2A, multiple endocrine adenomatosis type 2A, multiple endocrine neoplasia type 2A syndrome, and Sipple syndrome.
    More Information
    - Multiple endocrine neoplasia type 2A (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4881/multiple-endocrine-neoplasia-type-2a)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  MEN2B: A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the adrenal glands and growths around the nerves in the lips, tongue, lining of the mouth, and eyelids. Gastrointestinal symptoms and trouble with the spine or bones in the feet and thighs may also occur. MEN2B is caused by a mutation (change) in a gene called RET. Also called MEN2B syndrome, multiple endocrine adenomatosis type 2B, and multiple endocrine neoplasia type 2B syndrome.
    More Information
    - Multiple endocrine neoplasia type 2B (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10225/multiple-endocrine-neoplasia-type-2b)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  MEN2B syndrome: (... SIN-drome)
    Pronunciation of dictionary term "MEN2B syndrome"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the adrenal glands and growths around the nerves in the lips, tongue, lining of the mouth, and eyelids. Gastrointestinal symptoms and trouble with the spine or bones in the feet and thighs may also occur. MEN2B syndrome is caused by a mutation (change) in a gene called RET. Also called MEN2B, multiple endocrine adenomatosis type 2B, and multiple endocrine neoplasia type 2B syndrome.
    More Information
    - Multiple endocrine neoplasia type 2B (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10225/multiple-endocrine-neoplasia-type-2b)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  menin inhibitor: (MEH-nin in-HIH-bih-ter)
    Pronunciation of dictionary term "menin inhibitor"
    A substance that binds to a protein called menin and keeps it from binding to another protein called MLL. This prevents the activation of other proteins that can cause leukemia cells to form and grow in the body. Some menin inhibitors are being studied in the treatment of certain types of leukemia. They are a type of targeted therapy.
  meningeal: (meh-NIN-jee-ul)
    Pronunciation of dictionary term "meningeal"
    Having to do with the meninges (three thin layers of tissue that cover and protect the brain and spinal cord).
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
  meningeal carcinomatosis: (meh-NIN-jee-ul KAR-sih-NOH-muh-TOH-sis)
    Pronunciation of dictionary term "meningeal carcinomatosis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Meningeal carcinomatosis can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called carcinomatous meningitis, leptomeningeal carcinoma, leptomeningeal carcinomatosis, leptomeningeal metastasis, meningeal metastasis, and neoplastic meningitis.
  meningeal leukemia: (meh-NIN-jee-ul loo-KEE-mee-uh)
    Pronunciation of dictionary term "meningeal leukemia"
    A serious problem that may occur in leukemia. In meningeal leukemia, cancer cells have spread from the original (primary) tumor to the meninges (thin layers of tissue that cover and protect the brain and spinal cord). The cancer may cause the meninges to be inflamed. Also called leukemic leptomeningitis and leukemic meningitis.
  meningeal metastasis: (meh-NIN-jee-ul meh-TAS-tuh-sis)
    Pronunciation of dictionary term "meningeal metastasis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Meningeal metastasis can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called carcinomatous meningitis, leptomeningeal carcinoma, leptomeningeal carcinomatosis, leptomeningeal metastasis, meningeal carcinomatosis, and neoplastic meningitis.
  meningeal syndrome: (meh-NIN-jee-ul SIN-drome)
    Pronunciation of dictionary term "meningeal syndrome"
    A condition marked by headache, fever, and a stiff neck, which is caused when the meninges (three thin layers of tissue that cover and protect the brain and spinal cord) become irritated. Meningeal syndrome may be caused by blood, cancer cells, or substances from the breakdown of cancer cells that get into the cerebrospinal fluid (CSF). It may also be caused by infection with a bacterium, virus, or fungus.
  meninges: (meh-NIN-jeez)
    Pronunciation of dictionary term "meninges"
    The three thin layers of tissue that cover and protect the brain and spinal cord.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
  meningioma: (meh-NIN-jee-OH-muh)
    Pronunciation of dictionary term "meningioma"
    A type of slow-growing tumor that forms in the meninges (thin layers of tissue that cover and protect the brain and spinal cord). Meningiomas usually occur in adults.
  meningitis: (MEH-nin-JY-tis)
    Pronunciation of dictionary term "meningitis"
    Inflammation of the meninges (three thin layers of tissue that cover and protect the brain and spinal cord). Meningitis is usually caused by a bacterial or viral infection, but sometimes is caused by cancer, drug allergies, or inflammatory diseases.
  meningococcal disease: (meh-NIN-jeh-KAH-kul dih-ZEEZ)
    Pronunciation of dictionary term "meningococcal disease"
    A serious disease caused by infection with bacteria called Neisseria meningitidis. The bacteria can invade the blood, the thin layers of tissue that cover and protect the brain and spinal cord called the meninges, and rarely, the lungs. Meningococcal disease can be passed from one person to another through close contact with saliva, mucus, or other fluids from the nose, throat, or mouth. The signs and symptoms usually get worse very quickly. They include fever, headache, stiff neck, nausea, vomiting, confusion, sensitivity to light, a dark purple rash, fatigue, cold hands and feet, severe muscle or joint pain, rapid breathing, and diarrhea. Meningococcal disease is a life-threatening condition that can cause long-term problems, including brain or kidney damage, nervous system problems, hearing loss, and loss of arms, legs, fingers, or toes. It is more common in infants, teens, and young adults. Other people who are at increased risk of the disease include those with a weakened immune system, those who take certain medicines, college students who live in dorms, and those who travel to, work, or live in areas where the disease is more common.
  meningococcal vaccine: (meh-NIN-jeh-KAH-kul vak-SEEN)
    Pronunciation of dictionary term "meningococcal vaccine"
    A vaccine that helps protect the body against infection with certain types of Neisseria meningitidis bacteria that cause meningococcal disease. Meningococcal disease is a serious, life-threatening illness that affects the blood and the thin layers of tissue that cover and protect the brain and spinal cord. There are five meningococcal vaccines approved in the United States. Three of the vaccines are meningococcal conjugate vaccines, which protect against four different strains of meningococcal bacteria. The other two vaccines are meningococcal recombinant protein vaccines, which protect against a fifth strain.
  menopausal hormone therapy: (MEH-nuh-PAW-zul HOR-mone THAYR-uh-pee)
    Pronunciation of dictionary term "menopausal hormone therapy"
    Treatment with the hormones estrogen and progesterone or with estrogen alone to help relieve symptoms of menopause. Symptoms may include hot flashes, night sweats, vaginal dryness, sleep problems, mood swings, and thinning of the bones. Menopausal hormone therapy is given to replace the natural hormones that are no longer made by the body. It is given to women who have gone through menopause or who have early menopause caused by cancer treatment or by having their ovaries removed by surgery. Also called MHT.
    More Information
    - Menopausal Hormone Therapy and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/mht-fact-sheet)
  menopause: (MEH-nuh-pawz)
    Pronunciation of dictionary term "menopause"
    The time of life when a woman’s ovaries stop producing hormones and menstrual periods stop. Natural menopause usually occurs around age 50. A woman is said to be in menopause when she hasn’t had a period for 12 months in a row. Symptoms of menopause include hot flashes, mood swings, night sweats, vaginal dryness, trouble concentrating, and infertility.
  menorrhagia: (MEH-nuh-RAH-juh)
    Pronunciation of dictionary term "menorrhagia"
    Abnormally heavy menstrual bleeding.
  menses: (MEN-seez)
    Pronunciation of dictionary term "menses"
    The normal monthly shedding of blood and tissue from the lining of the uterus (womb) when pregnancy does not occur. During menses, menstrual blood and tissue flow from the uterus through the cervix and pass out of the body through the vagina. Menses usually occurs about every 28 days (except during pregnancy) and lasts 3 to 5 days, but this can vary from person to person. It normally starts during puberty and ends at menopause. Also called menstrual period and menstruation.
  menstrual cycle: (MEN-stroo-ul SY-kul)
    Pronunciation of dictionary term "menstrual cycle"
    The monthly cycle of hormonal changes from the beginning of one menstrual period to the beginning of the next. During the monthly menstrual cycle, the lining of the uterus thickens to prepare for pregnancy. If pregnancy does not occur, estrogen and progesterone hormone levels begin falling. Very low levels of estrogen and progesterone tell the body to begin menstruation (the monthly shedding of blood and tissue from the lining of the uterus). The menstrual cycle usually lasts about 28 days, but this can vary from person to person. It normally starts during puberty and ends at menopause.
  menstrual period: (MEN-stroo-ul PEER-ee-ud)
    Pronunciation of dictionary term "menstrual period"
    The normal monthly shedding of blood and tissue from the lining of the uterus (womb) when pregnancy does not occur. During a menstrual period, menstrual blood and tissue flow from the uterus through the cervix and pass out of the body through the vagina. A menstrual period usually occurs about every 28 days (except during pregnancy) and lasts 3 to 5 days, but this can vary from person to person. It normally starts during puberty and ends at menopause. Also called menses and menstruation.
  menstruation: (MEN-stroo-WAY-shun)
    Pronunciation of dictionary term "menstruation"
    The normal monthly shedding of blood and tissue from the lining of the uterus (womb) when pregnancy does not occur. During menstruation, menstrual blood and tissue flow from the uterus through the cervix and pass out of the body through the vagina. Menstruation usually occurs about every 28 days (except during pregnancy) and lasts 3 to 5 days, but this can vary from person to person. It normally starts during puberty and ends at menopause. Also called menses and menstrual period.
  mental health: (MEN-tul helth)
    Pronunciation of dictionary term "mental health"
    A person’s overall psychological and emotional condition. Good mental health is a state of well-being in which a person is able to cope with everyday events, think clearly, be responsible, meet challenges, and have good relationships with others.
  mental health counselor: (MEN-tul helth KOWN-seh-ler)
    Pronunciation of dictionary term "mental health counselor"
    A specialist who talks to patients and their families about emotional and personal matters, and can help them make decisions. Also called counselor.
  menthol: (MEN-thol)
    Pronunciation of dictionary term "menthol"
    A substance that comes from mint oils or is made in the laboratory. It is used to relieve itching and to treat problems in the upper respiratory tract. Menthol causes a cooling sensation when eaten or put on the skin and it acts as a mild pain killer. It is found in nasal sprays, cough drops, inhalers, creams, and lotions. It is also used as a flavor in many food and oral hygiene products.
  MEPACT: A drug being studied in the treatment of young adults with bone cancer that has gotten worse or come back. MEPACT activates certain types of white blood cells and helps the immune system kill cancer cells. It is a type of immunostimulant. Also called L-MTP-PE, mifamurtide, and muramyl tripeptide phosphatidylethanolamine.
  meperidine hydrochloride: (meh-PAYR-ih-deen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "meperidine hydrochloride"
    A drug used to treat moderate to severe pain. Meperidine hydrochloride works by binding to opioid receptors, such as the mu opioid receptor, in the central nervous system. This blocks pain signals and changes how the body responds to pain. Meperidine hydrochloride is a type of synthetic opioid agonist that works as an analgesic (pain reliever). Also called Demerol.
  mercaptopurine: (mer-KAP-toh-PYOOR-een)
    Pronunciation of dictionary term "mercaptopurine"
    A drug used with other drugs to treat adults and children with acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Mercaptopurine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called Purinethol and Purixan.
    More Information
    - Mercaptopurine (https://www.cancer.gov/about-cancer/treatment/drugs/mercaptopurine)
  mercury: (MER-kyoo-ree)
    Pronunciation of dictionary term "mercury"
    A silver-white, poisonous metal that is a liquid at ordinary temperatures. It is commonly used in thermometers and amalgams, and has been used as an ingredient in some homeopathic medicines and in very small amounts as a preservative in viral vaccines.
  mercy killing: (MER-see KIH-ling)
    Pronunciation of dictionary term "mercy killing"
    An easy or painless death, or the intentional ending of the life of a person suffering from an incurable or painful disease at his or her request. Also called euthanasia.
  meridian: (meh-RIH-dee-un)
    Pronunciation of dictionary term "meridian"
    In traditional Chinese medicine, one of 20 channels that form a network through which qi (the body's vital energy) flows and that connect the body’s acupuncture sites.
  Merkel cell: (MER-kul sel)
    Pronunciation of dictionary term "Merkel cell"
    A special type of cell found right below the epidermis (top layer of skin). These cells are very close to the nerve endings that receive the sensation of touch and may be involved in touch. The cells also contain substances that may act as hormones.
    More Information
    - Merkel Cell Carcinoma Treatment
    Anatomy of the skin showing the epidermis, dermis, and subcutaneous tissue. Merkel cells are in the layer of basal cells at the deepest part of the epidermis and are connected to nerves.
    Anatomy of the skin with Merkel cells; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the epidermis with Merkel cells above the dermis with a vein and artery. Nerves are connected to Merkel cells.
  Merkel cell cancer: (MER-kul sel KAN-ser)
    Pronunciation of dictionary term "Merkel cell cancer"
    A rare type of cancer that forms on or just beneath the skin, usually in parts of the body that have been exposed to the sun. It is most common in older people and in people with weakened immune systems. Also called Merkel cell carcinoma, neuroendocrine carcinoma of the skin, and trabecular cancer.
    More Information
    - Merkel Cell Carcinoma Treatment
    Anatomy of the skin showing the epidermis, dermis, and subcutaneous tissue. Merkel cells are in the layer of basal cells at the deepest part of the epidermis and are connected to nerves.
    Anatomy of the skin with Merkel cells; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the epidermis with Merkel cells above the dermis with a vein and artery. Nerves are connected to Merkel cells.
  Merkel cell carcinoma: (MER-kul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "Merkel cell carcinoma"
    A rare type of cancer that forms on or just beneath the skin, usually in parts of the body that have been exposed to the sun. It is most common in older people and in people with weakened immune systems. Also called Merkel cell cancer, neuroendocrine carcinoma of the skin, and trabecular cancer.
    More Information
    - Merkel Cell Carcinoma Treatment
    Anatomy of the skin showing the epidermis, dermis, and subcutaneous tissue. Merkel cells are in the layer of basal cells at the deepest part of the epidermis and are connected to nerves.
    Anatomy of the skin with Merkel cells; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the epidermis with Merkel cells above the dermis with a vein and artery. Nerves are connected to Merkel cells.
  mesenchymal: (meh-ZEN-kih-mul)
    Pronunciation of dictionary term "mesenchymal"
    Refers to cells that develop into connective tissue, blood vessels, and lymphatic tissue.
  mesenteric membrane: (MEH-zen-TAYR-ik MEM-brayn)
    Pronunciation of dictionary term "mesenteric membrane"
    The peritoneal membrane that attaches the intestines to the abdominal wall near the back.
  mesna: (MEZ-nuh)
    Pronunciation of dictionary term "mesna"
    A drug used to prevent hemorrhagic cystitis (bleeding in the bladder) caused by the anticancer drug ifosfamide. Mesna helps protect healthy tissue from some of the side effects caused by certain anticancer drugs. It is a type of chemoprotective agent. Also called Mesnex.
    More Information
    - Mesna (https://www.cancer.gov/about-cancer/treatment/drugs/mesna)
  Mesnex: (MES-nex)
    Pronunciation of dictionary term "Mesnex"
    A drug used to prevent hemorrhagic cystitis (bleeding in the bladder) caused by the anticancer drug ifosfamide. Mesnex helps protect healthy tissue from some of the side effects caused by certain anticancer drugs. It is a type of chemoprotective agent. Also called mesna.
    More Information
    - Mesna (https://www.cancer.gov/about-cancer/treatment/drugs/mesna)
  mesonephroma: (MEH-zoh-neh-FROH-muh)
    Pronunciation of dictionary term "mesonephroma"
    A rare type of tumor, usually of the female genital tract, in which the insides of the cells look clear when viewed under a microscope. Also called clear cell adenocarcinoma and clear cell carcinoma.
  mesothelin: (MEH-zoh-THEE-lin)
    Pronunciation of dictionary term "mesothelin"
    A protein found on the surface of certain types of normal cells and cancer cells. Mesothelin may help these cells stick together and send signals. A higher-than-normal amount of mesothelin is found on some cancer cells, including mesothelioma, pancreatic cancer, and ovarian cancer.
  mesothelioma: (MEH-zoh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "mesothelioma"
    A benign (not cancer) or malignant (cancer) tumor affecting the lining of the chest or abdomen. Exposure to asbestos particles in the air increases the risk of developing malignant mesothelioma.
    More Information
    - Malignant Mesothelioma (https://www.cancer.gov/types/mesothelioma)
  messenger RNA: (MEH-sen-jer …)
    Pronunciation of dictionary term "messenger RNA"
    A type of RNA found in cells. Messenger RNA molecules carry the genetic information needed to make proteins. They carry the information from the DNA in the nucleus of the cell to the cytoplasm where the proteins are made. Also called mRNA.
  MET gene: (… jeen)
    Pronunciation of dictionary term "MET gene"
    A gene that makes a protein that is involved in sending signals within cells and in cell growth and survival. Mutated (changed) forms of the MET gene may cause abnormal cells to grow and spread in the body. Mutations in the MET gene have been found in an inherited condition called hereditary papillary renal carcinoma (HPRC). Patients with HPRC have an increased risk of a type of kidney cancer called papillary renal carcinoma. MET gene mutations have also been found in liver cancer and head and neck cancer. The MET gene is a type of proto-oncogene and a type of receptor tyrosine kinase gene.
  MET tyrosine kinase inhibitor PF-02341066: (… TY-ruh-seen KY-nays in-HIH-bih-ter …)
    Pronunciation of dictionary term "MET tyrosine kinase inhibitor PF-02341066"
    A drug used to treat non-small cell lung cancer that has spread to other parts of the body. It is used in patients whose cancer has a mutated (changed) form of the anaplastic lymphoma kinase (ALK) gene or the ROS1 gene. It is also being studied in the treatment of other types of cancer. MET tyrosine kinase inhibitor PF-02341066 blocks the proteins made by the mutated ALK and ROS1 genes. Blocking these proteins may stop the growth and spread of cancer cells. MET tyrosine kinase inhibitor PF-02341066 may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called crizotinib, PF-02341066, and Xalkori.
    More Information
    - Crizotinib (https://www.cancer.gov/about-cancer/treatment/drugs/crizotinib)
  MET/VEGFR-2 inhibitor GSK1363089: (…. in-HIH-bih-ter ….)
    Pronunciation of dictionary term "MET/VEGFR-2 inhibitor GSK1363089"
    A substance being studied in the treatment of cancer. MET/VEGFR-2 inhibitor GSK1363089 blocks enzymes involved in the growth and spread of tumor cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called foretinib and XL880.
  meta-analysis: (meh-tuh-uh-NA-lih-sis)
    Pronunciation of dictionary term "meta-analysis"
    A process that analyzes data from different studies done about the same subject. The results of a meta-analysis are usually stronger than the results of any study by itself.
  metabolic: (MEH-tuh-BAH-lik)
    Pronunciation of dictionary term "metabolic"
    Having to do with metabolism (the total of all chemical changes that take place in a cell or an organism to produce energy and basic materials needed for important life processes).
  metabolic acidosis: (MEH-tuh-BAH-lik A-sih-DOH-sis)
    Pronunciation of dictionary term "metabolic acidosis"
    A condition in which the blood is too acidic. It may be caused by severe illness or sepsis (bacteria in the bloodstream).
  metabolic disorder: (MEH-tuh-BAH-lik dis-OR-der)
    Pronunciation of dictionary term "metabolic disorder"
    A condition in which normal metabolic processes are disrupted, usually because of a missing enzyme.
  metabolic syndrome: (MEH-tuh-BAH-lik SIN-drome)
    Pronunciation of dictionary term "metabolic syndrome"
    A condition marked by extra fat around the abdomen, high levels of blood glucose (sugar) when not eating, high levels of triglycerides (a type of fat) in the blood, low levels of high-density lipoproteins (a type of protein that carries fats) in the blood, and high blood pressure. People with metabolic syndrome are at increased risk of diabetes mellitus and diseases of the heart and blood vessels. Also called metabolic syndrome X.
  metabolic syndrome X: (MEH-tuh-BAH-lik SIN-drome ...)
    Pronunciation of dictionary term "metabolic syndrome X"
    A condition marked by extra fat around the abdomen, high levels of blood glucose (sugar) when not eating, high levels of triglycerides (a type of fat) in the blood, low levels of high-density lipoproteins (a type of protein that carries fats) in the blood, and high blood pressure. People with metabolic syndrome X are at increased risk of diabetes mellitus and diseases of the heart and blood vessels. Also called metabolic syndrome.
  metabolic therapy: (MEH-tuh-BAH-lik THAYR-uh-pee)
    Pronunciation of dictionary term "metabolic therapy"
    Treatment to correct changes in metabolism that can be caused by disease.
  metabolic type: (MEH-tuh-BAH-lik tipe)
    Pronunciation of dictionary term "metabolic type"
    In alternative medicine, a theory that people fall into one of three groups (protein, carbohydrate, or mixed type) based on the main type of food that their bodies need to stay healthy.
  metabolism: (meh-TA-buh-lih-zum)
    Pronunciation of dictionary term "metabolism"
    The chemical changes that take place in a cell or an organism. These changes make energy and the materials cells and organisms need to grow, reproduce, and stay healthy. Metabolism also helps get rid of toxic substances.
  metabolite: (meh-TA-boh-lite)
    Pronunciation of dictionary term "metabolite"
    A substance made or used when the body breaks down food, drugs or chemicals, or its own tissue (for example, fat or muscle tissue). This process, called metabolism, makes energy and the materials needed for growth, reproduction, and maintaining health. It also helps get rid of toxic substances.
  metabolomics: (meh-TA-buh-LOH-mix)
    Pronunciation of dictionary term "metabolomics"
    The study of substances called metabolites in cells and tissues. Metabolites are small molecules that are made when the body breaks down food, drugs, chemicals, or its own tissue. They can be measured in blood, urine, and other body fluids. Disease and environmental factors, such as diet, drugs, and chemicals, can affect how metabolites are made and used in the body. Metabolomics may help find new ways to diagnose and treat diseases, such as cancer.
  metaiodobenzylguanidine scan: (meh-tuh-I-oh-doh-BEN-zul-GWAH-nih-deen skan)
    Pronunciation of dictionary term "metaiodobenzylguanidine scan"
    A procedure used to find neuroendocrine tumors, such as neuroblastomas and pheochromocytomas. A small amount of a substance called radioactive metaiodobenzylguanidine is injected into a vein and travels through the bloodstream. Neuroendocrine tumor cells take up the radioactive metaiodobenzylguanidine and are detected by a scanner. Also called iobenguane scan and MIBG scan.
  metallic: (meh-TA-lik)
    Pronunciation of dictionary term "metallic"
    Having to do with metal. Some cancer treatments may change the sense of taste and cause foods to have a metallic taste.
  metallic endoprosthesis: (meh-TA-lik EN-doh-pros-THEE-sis)
    Pronunciation of dictionary term "metallic endoprosthesis"
    A device made of metal that is placed inside the body to replace a body part removed by surgery. An example is a thigh bone replaced during surgery for cancer.
  metaplasia: (meh-tuh-PLAY-zhuh)
    Pronunciation of dictionary term "metaplasia"
    A change of cells to a form that does not normally occur in the tissue in which it is found.
  metaplastic carcinoma: (meh-tuh-PLAS-tik KAR-sih-NOH-muh)
    Pronunciation of dictionary term "metaplastic carcinoma"
    A general term used to describe cancer that begins in cells that have changed into another cell type (for example, a squamous cell of the esophagus changing to resemble a cell of the stomach). In some cases, metaplastic changes alone may mean there is an increased chance of cancer developing at the site.
  metastasectomy: (meh-TAS-tuh-SEK-toh-mee)
    Pronunciation of dictionary term "metastasectomy"
    Surgery to remove one or more metastases (tumors formed from cells that have spread from the primary tumor). When all metastases are removed, it is called a complete metastasectomy.
  metastasis: (meh-TAS-tuh-sis)
    Pronunciation of dictionary term "metastasis"
    The spread of cancer cells from the place where they first formed to another part of the body. In metastasis, cancer cells break away from the original (primary) tumor, travel through the blood or lymph system, and form a new tumor in other organs or tissues of the body. The new, metastatic tumor is the same type of cancer as the primary tumor. For example, if breast cancer spreads to the lung, the cancer cells in the lung are breast cancer cells, not lung cancer cells.
    More Information
    - Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer)
    Metastasis. In metastasis, cancer cells break away from where they first formed (primary cancer), travel through the blood or lymph system, and form new tumors (metastatic tumors) in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor.
    Metastasis; drawing shows primary cancer that has spread from the colon to other parts of the body (the liver and the lung). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph system, to another part of the body where a metastatic tumor has formed.
    Metastasis: How Cancer Spreads
    Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.
    YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)
  metastasis-free survival: (meh-TAS-tuh-sis ... ser-VY-vul)
    Pronunciation of dictionary term "metastasis-free survival"
    The length of time from the start of treatment for cancer that a patient is still alive and the cancer has not spread to other parts of the body. In a clinical trial, measuring the metastasis-free survival is one way to see how well a new treatment works. Also called MFS.
  metastasize: (meh-TAS-tuh-size)
    Pronunciation of dictionary term "metastasize"
    To spread from one part of the body to another. When cancer cells metastasize and form secondary tumors, the cells in the metastatic tumor are like those in the original (primary) tumor.
    More Information
    - Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer)
    Metastasis. In metastasis, cancer cells break away from where they first formed (primary cancer), travel through the blood or lymph system, and form new tumors (metastatic tumors) in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor.
    Metastasis; drawing shows primary cancer that has spread from the colon to other parts of the body (the liver and the lung). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph system, to another part of the body where a metastatic tumor has formed.
    Metastasis: How Cancer Spreads
    Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.
    YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)
  metastatic: (meh-tuh-STA-tik)
    Pronunciation of dictionary term "metastatic"
    Having to do with metastasis, which is the spread of cancer from the primary site (place where it started) to other places in the body.
    More Information
    - Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer)
    Metastasis. In metastasis, cancer cells break away from where they first formed (primary cancer), travel through the blood or lymph system, and form new tumors (metastatic tumors) in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor.
    Metastasis; drawing shows primary cancer that has spread from the colon to other parts of the body (the liver and the lung). An inset shows cancer cells spreading from the primary cancer, through the blood and lymph system, to another part of the body where a metastatic tumor has formed.
    Metastasis: How Cancer Spreads
    Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.
    YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)
  metasynchronous: (meh-tuh-SING-kruh-nus)
    Pronunciation of dictionary term "metasynchronous"
    Occurring at nearly the same time.
  meteorism: (MEE-tee-oh-rih-zum)
    Pronunciation of dictionary term "meteorism"
    Swelling of the abdomen caused by gas in the intestines or peritoneal cavity. Also called tympanites.
  metformin: (met-FOR-min)
    Pronunciation of dictionary term "metformin"
    The active ingredient in a drug used to treat diabetes mellitus (a condition in which the body cannot control the level of sugar in the blood). It is also being studied in the treatment of cancer. It decreases the amount of glucose (a type of sugar) released into the bloodstream from the liver and increases the body’s use of the glucose. Metformin is a type of antidiabetic agent.
  metformin hydrochloride: (met-FOR-min HY-droh-KLOR-ide)
    Pronunciation of dictionary term "metformin hydrochloride"
    A drug used to treat diabetes mellitus (a condition in which the body cannot control the level of sugar in the blood). It is also being studied in the treatment of cancer. Metformin hydrochloride decreases the amount of glucose (a type of sugar) released into the bloodstream from the liver and increases the body’s use of the glucose. It is a type of antidiabetic agent. Metformin is the active ingredient of metformin hydrochloride. Also called Glucophage.
  methadone hydrochloride: (MEH-thuh-DONE HY-droh-KLOR-ide)
    Pronunciation of dictionary term "methadone hydrochloride"
    A drug used to treat moderate to severe pain. It is also used to help people who are addicted to opioid drugs, such as heroin or prescription pain medicines. Methadone hydrochloride works by binding to opioid receptors, mainly the mu opioid receptor, in the central nervous system. This blocks pain signals and changes how the body responds to pain. It also reduces cravings and withdrawal symptoms in people with opioid use disorder. Methadone hydrochloride is a type of synthetic opioid agonist that works as an analgesic (pain reliever).
    More Information
    - Cancer Pain
  methanol: (MEH-thuh-nol)
    Pronunciation of dictionary term "methanol"
    A type of alcohol used to make antifreeze, pesticides, windshield wiper fluid, paint thinner, certain types of fuel, and other substances. Methanol catches fire easily and is very poisonous. It is one of many harmful chemicals found in tobacco smoke. Also called methyl alcohol and wood alcohol.
  methemoglobin: (met-HEE-moh-GLOH-bin)
    Pronunciation of dictionary term "methemoglobin"
    A form of hemoglobin found in the blood in small amounts. Unlike normal hemoglobin, methemoglobin cannot carry oxygen. Injury or certain drugs, chemicals, or foods may cause a higher-than-normal amount of methemoglobin to be made. This causes a condition called methemoglobinemia.
  methemoglobinemia: (MET-hee-moh-GLOH-bih-NEE-mee-uh)
    Pronunciation of dictionary term "methemoglobinemia"
    A condition in which a higher-than-normal amount of methemoglobin is found in the blood. Methemoglobin is a form of hemoglobin that cannot carry oxygen. In methemoglobinemia, tissues cannot get enough oxygen. Symptoms may include headache, dizziness, fatigue, shortness of breath, nausea, vomiting, rapid heartbeat, loss of muscle coordination, and blue-colored skin. Methemoglobinemia can be caused by injury or being exposed to certain drugs, chemicals, or foods. It can also be an inherited condition.
    More Information
    - Methemoglobinemia, beta-globin type (MedlinePlus) (https://medlineplus.gov/genetics/condition/methemoglobinemia-beta-globin-type/)
    - Hereditary methemoglobinemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2659/congenital-methemoglobinemia)
  methicillin-resistant Staphylococcus aureus: (MEH-thih-SIH-lin-reh-ZIH-stunt STA-fuh-loh-KAH-kus AW-ree-us)
    Pronunciation of dictionary term "methicillin-resistant Staphylococcus aureus"
    A type of bacteria that causes an infection that does not respond to common antibiotics, including methicillin, amoxicillin, and penicillin. Most methicillin-resistant Staphylococcus aureus infections occur on the skin and are mild. However, they can also be serious or life threatening and difficult to treat. Methicillin-resistant Staphylococcus aureus infections usually occur in people with weakened immune systems who are in hospitals, nursing homes, or other health care centers. They can also occur in healthy people who have skin-to-skin contact with others, such as childcare workers, team athletes, and people who live in crowded conditions. Also called MRSA.
  methodology: (MEH-thuh-DAH-loh-jee)
    Pronunciation of dictionary term "methodology"
    In medicine, the rules and procedures for doing research and evaluating results.
  methotrexate sodium: (MEH-thoh-TREK-sayt SOH-dee-um)
    Pronunciation of dictionary term "methotrexate sodium"
    A drug used alone or with other drugs to treat many types of cancer, certain types of arthritis, and severe psoriasis (a type of skin condition). It is also being studied in the treatment of other conditions and types of cancer. Methotrexate sodium stops cells from using folic acid to make DNA and may kill cancer cells. It may also lower the body’s immune response. Methotrexate sodium is a type of antimetabolite and a type of antifolate. Also called MTX, Trexall, and Xatmep.
    More Information
    - Methotrexate Sodium (Cancer Treatment) (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
  methoxsalen: (meh-THOK-suh-len)
    Pronunciation of dictionary term "methoxsalen"
    A drug used together with UV light to treat psoriasis, vitiligo, and skin nodules of cutaneous T-cell lymphoma. It is also being studied in the treatment of graft-versus-host disease. It belongs to the family of drugs called psoralens and furocoumarins.
  methoxyamine hydrochloride: (meh-THOK-see-uh-meen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "methoxyamine hydrochloride"
    A substance being studied in the treatment of cancer. It blocks the ability of a cell to repair damage to its DNA and may kill cancer cells. It may also help some anticancer drugs work better. It is a type of antineoplastic agent.
  methoxypolyethylene glycol epoetin beta: (meh-THOK-see-PAH-lee-EH-thih-leen GLY-kol ee-POH-eh-tin BAY-tuh)
    Pronunciation of dictionary term "methoxypolyethylene glycol epoetin beta"
    A substance being studied in the treatment of anemia in patients who are receiving chemotherapy. It is a form of erythropoietin (a substance produced in the kidneys that stimulates the production of red blood cells) that has been changed in the laboratory. Also called Ro 50-3821.
  methyl alcohol: (MEH-thul AL-kuh-hol)
    Pronunciation of dictionary term "methyl alcohol"
    A type of alcohol used to make antifreeze, pesticides, windshield wiper fluid, paint thinner, certain types of fuel, and other substances. Methyl alcohol catches fire easily and is very poisonous. It is one of many harmful chemicals found in tobacco smoke. Also called methanol and wood alcohol.
  methyl group: (MEH-thul groop)
    Pronunciation of dictionary term "methyl group"
    A small molecule made of one carbon and three hydrogen atoms. Methyl groups are added or removed from proteins or nucleic acids and may change the way these molecules act in the body.
  methyl-5-aminolevulinate: (MEH-thul-5-uh-MEE-noh-LEH-vyoo-LIH-nayt)
    Pronunciation of dictionary term "methyl-5-aminolevulinate"
    A drug used in photodynamic therapy; it is absorbed by tumor cells and, when exposed to light, becomes active and kills the cancer cells.
  methylation: (MEH-thuh-LAY-shun)
    Pronunciation of dictionary term "methylation"
    A chemical reaction in the body in which a small molecule called a methyl group gets added to DNA, proteins, or other molecules. The addition of methyl groups can affect how some molecules act in the body. For example, methylation of the DNA sequence of a gene may turn the gene off so it does not make a protein. Changes in the methylation patterns of genes or proteins can affect a person’s risk of developing a disease, such as cancer.
  methylnaltrexone: (MEH-thul-nal-TREK-sone)
    Pronunciation of dictionary term "methylnaltrexone"
    The active ingredient in a drug used to relieve constipation caused by treatment with opioids (pain killers similar to morphine). It is used in patients with pain caused by cancer or treatment for cancer or by other advanced disease. Methylnaltrexone binds to opioid receptors outside the brain and may block the side effects of opioid drugs without affecting their ability to relieve pain. Methylnaltrexone is a type of peripheral opioid receptor antagonist.
  methylnaltrexone bromide: (MEH-thul-nal-TREK-sone BROH-mide)
    Pronunciation of dictionary term "methylnaltrexone bromide"
    A drug used to relieve constipation caused by the use of opioids (pain killers that are like morphine). It is used in adults with pain caused by cancer or treatment for cancer or by other advanced disease. Methylnaltrexone bromide binds to opioid receptors outside the brain and may block the side effects of opioid drugs without affecting their ability to relieve pain. Methylnaltrexone bromide is a type of peripheral opioid receptor antagonist. Also called Relistor.
    More Information
    - Methylnaltrexone Bromide (https://www.cancer.gov/about-cancer/treatment/drugs/methylnaltrexonebromide)
  methylphenidate hydrochloride: (MEH-thul-feh-NIH-dayt HY-droh-KLOR-ide)
    Pronunciation of dictionary term "methylphenidate hydrochloride"
    A drug used to treat certain behavior disorders, such as attention deficit hyperactivity disorder (ADHD). It is also being studied as a way to improve brain function in patients treated with anticancer drugs. Methylphenidate hydrochloride acts on certain parts of the brain. It is a type of central nervous system stimulant. Also called Concerta and Ritalin.
  methylprednisolone: (MEH-thul-pred-NIH-suh-lone)
    Pronunciation of dictionary term "methylprednisolone"
    A corticosteroid hormone replacement.
  metoclopramide: (meh-toh-KLOH-pruh-mide)
    Pronunciation of dictionary term "metoclopramide"
    A drug that increases the motility (movements and contractions) of the stomach and upper intestine. It is used to treat certain stomach problems and nausea and vomiting caused by chemotherapy. It is a type of antiemetic and a type of motility agent. Also called Reglan.
  metronidazole: (MEH-troh-NY-duh-zole)
    Pronunciation of dictionary term "metronidazole"
    A drug that is used to treat infection and is being studied in the treatment of cancer. It is a type of antibacterial, antiprotozoal, and anthelmintic. Also called Flagyl.
  metronomic chemotherapy: (MEH-truh-NAH-mik KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "metronomic chemotherapy"
    Treatment in which low doses of anticancer drugs are given on a continuous or frequent, regular schedule (such as daily or weekly), usually over a long time. Metronomic chemotherapy causes less severe side effects than standard chemotherapy. Giving low doses of chemotherapy may stop the growth of new blood vessels that tumors need to grow. Also called low-dose chemotherapy.
  MeV linear accelerator: (... LIH-nee-er ak-SEH-leh-RAY-ter)
    Pronunciation of dictionary term "MeV linear accelerator"
    A machine that uses electricity to form a stream of fast-moving subatomic particles. This creates high-energy radiation that may be used to treat cancer. Also called linac, linear accelerator, and mega-voltage linear accelerator.
  Mevacor: (MEH-vuh-kor)
    Pronunciation of dictionary term "Mevacor"
    A drug used to lower the amount of cholesterol in the blood. It is also being studied in the prevention and treatment of some types of cancer. Mevacor is a type of HMG-CoA reductase inhibitor (statin). Also called lovastatin.
  mevalonate pathway: (meh-VA-loh-nayt PATH-way)
    Pronunciation of dictionary term "mevalonate pathway"
    Describes a series of reactions in which proteins work together to make molecules. These molecules are part of many processes, including making cholesterol. Changes in this pathway may lead to cancer cell growth. Drugs or substances that affect this pathway are used to treat high cholesterol, and are being studied in the prevention and treatment of cancer and other diseases.
  Mexican valerian: (MEK-sih-kun vuh-LEER-ee-un)
    Pronunciation of dictionary term "Mexican valerian"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, garden valerian, Indian valerian, Pacific valerian, valerian, Valeriana officinalis, and Valerianae radix.
  mFOLFOX-6: An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called mFOLFOX-6 regimen, modified FOLFOX-6, and modified FOLFOX-6 regimen.
  mFOLFOX-6 regimen: (... REH-jih-men)
    Pronunciation of dictionary term "mFOLFOX-6 regimen"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called mFOLFOX-6, modified FOLFOX-6, and modified FOLFOX-6 regimen.
  MFS: The length of time from the start of treatment for cancer that a patient is still alive and the cancer has not spread to other parts of the body. In a clinical trial, measuring the MFS is one way to see how well a new treatment works. Also called metastasis-free survival.
  MG98: A substance being studied in the treatment of cancer. It blocks the production of a protein called DNA methyltransferase, which helps control gene expression. This may kill cancer cells that need DNA methyltransferase to grow. It is a type of antisense oligonucleotide.
  MGCD0103: A substance being studied in the treatment of several types of cancer. It blocks enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase (HDAC) inhibitor. Also called mocetinostat.
  MGPT: A laboratory test in which many genes are studied in a sample of tissue. MGPTs help find mutations (changes) in certain genes that may increase a person’s risk of a disease such as cancer. They may also look at the activity of certain genes in a sample of tissue. MGPTs may be used to help plan treatment or help predict whether cancer will spread to other parts of the body or come back. Also called multigene panel test and multigene test.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  MGUS: A benign condition in which there is a higher-than-normal level of a protein called M protein in the blood. Patients with MGUS are at an increased risk of developing cancer. Also called monoclonal gammopathy of undetermined significance.
  MHT: Treatment with the hormones estrogen and progesterone or with estrogen alone to help relieve symptoms of menopause. Symptoms may include hot flashes, night sweats, vaginal dryness, sleep problems, mood swings, and thinning of the bones. MHT is given to replace the natural hormones that are no longer made by the body. It is given to women who have gone through menopause or who have early menopause caused by cancer treatment or by having their ovaries removed by surgery. Also called menopausal hormone therapy.
    More Information
    - Menopausal Hormone Therapy and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/mht-fact-sheet)
  MIBG scan: (... skan)
    Pronunciation of dictionary term "MIBG scan"
    A procedure used to find neuroendocrine tumors, such as neuroblastomas and pheochromocytomas. A small amount of a substance called radioactive MIBG is injected into a vein and travels through the bloodstream. Neuroendocrine tumor cells take up the radioactive MIBG and are detected by a scanner. Also called iobenguane scan and metaiodobenzylguanidine scan.
  micelle: (MY-sel)
    Pronunciation of dictionary term "micelle"
    A tiny particle made of substances that are soluble in water and that come together to form a ball-like shape. These particles can carry other substances inside them. In medicine, micelles are made in the laboratory and are used to carry drugs to body tissues and cells.
  microarray: (MY-kroh-uh-RAY)
    Pronunciation of dictionary term "microarray"
    A laboratory tool used to analyze large numbers of genes or proteins at one time. In a microarray, biologic molecules such as DNA, RNA, or protein are placed in a pattern onto a surface such as a glass slide. Other substances are added to these slides to detect specific patterns of molecules. Microarrays are being used to help diagnose diseases, such as cancer, and to develop treatments for them.
  microbicide: (my-KROH-bih-side)
    Pronunciation of dictionary term "microbicide"
    Any substance or process that kills germs (bacteria, viruses, and other microorganisms that can cause infection and disease). Also called germicide.
  microbiome: (MY-kroh-BY-ome)
    Pronunciation of dictionary term "microbiome"
    The collection of all the microorganisms and viruses that live in a given environment, including the human body or part of the body, such as the digestive system. The human microbiome may play a role in a person’s health. Studying the human microbiome may help prevent and treat disease in the future.
    More Information
    - Microbiome (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Microbiome?id=502)
  microcalcification: (MY-kroh-KAL-sih-fih-KAY-shun)
    Pronunciation of dictionary term "microcalcification"
    A tiny deposit of calcium in the breast that cannot be felt but can be detected on a mammogram. A cluster of these very small specks of calcium may indicate that cancer is present.
  microenvironment: (MY-kroh-en-VY-run-ment)
    Pronunciation of dictionary term "microenvironment"
    In biology, the cells, molecules, and structures (such as blood vessels) that surround and support other cells and tissues. Abnormal cells, such as cancer cells, can change their microenvironment. Changes in the microenvironment can affect how cancer cells grow and spread. Studying the microenvironment may help researchers understand how cancer cells form and find new ways to treat cancer.
  microflora: (MY-kroh-FLOR-uh)
    Pronunciation of dictionary term "microflora"
    Bacteria and other organisms that live inside the intestines. They help digest food. Vitamins such as biotin and vitamin K are made by microflora. Also called gut flora, gut microflora, intestinal flora, and intestinal microflora.
  microfluidic device: (MY-kroh-floo-IH-dik dee-VISE)
    Pronunciation of dictionary term "microfluidic device"
    An instrument that uses very small amounts of fluid on a microchip to do certain laboratory tests. A microfluidic device may use body fluids or solutions containing cells or cell parts to diagnose diseases. Also called lab-on-a-chip.
  microgram: (MY-kroh-gram)
    Pronunciation of dictionary term "microgram"
    One millionth of a gram.
  microliter: (MY-kroh-LEE-ter)
    Pronunciation of dictionary term "microliter"
    A measure of volume for a liquid, using the metric system. One microliter is equal to a millionth of a liter. Also called µL.
  micrometastasis: (MY-kroh-meh-TAS-tuh-sis)
    Pronunciation of dictionary term "micrometastasis"
    Small numbers of cancer cells that have spread from the primary tumor to other parts of the body and are too few to be picked up in a screening or diagnostic test.
  micromolar: (MY-kroh-MOH-ler)
    Pronunciation of dictionary term "micromolar"
    A concentration of 1/1,000,000 (one millionth) molecular weight per liter (mol/L).
  micromole: (MY-kroh-mole)
    Pronunciation of dictionary term "micromole"
    The amount of a substance equal to a millionth of a mole (a measure of the amount of a substance). Also called µM.
  micronutrient: (MY-kroh-NOO-tree-ent)
    Pronunciation of dictionary term "micronutrient"
    A substance the body needs in tiny amounts to grow and stay healthy. Examples are vitamins and minerals.
  microorganism: (MY-kroh-OR-guh-NIH-zum)
    Pronunciation of dictionary term "microorganism"
    An organism that can be seen only through a microscope. Microorganisms include bacteria, protozoa, algae, and fungi. Although viruses are not considered living organisms, they are sometimes classified as microorganisms.
  microRNA: (MY-kroh …)
    Pronunciation of dictionary term "microRNA"
    A type of RNA found in cells and in blood. MicroRNAs are smaller than many other types of RNA and can bind to messenger RNAs (mRNAs) to block them from making proteins. MicroRNAs are being studied in the diagnosis and treatment of cancer. Also called miRNA.
  microsatellite: (MY-kroh-SA-teh-lite)
    Pronunciation of dictionary term "microsatellite"
    A short sequence of DNA, usually 1 to 4 basepairs (a unit of DNA), that is repeated together in a row along the DNA molecule. There is variation from person to person in the number of repeats. There are hundreds of places in human DNA that contain microsatellites.
    More Information
    - Microsatellite (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Microsatellite)
  microsatellite instability: (MY-kroh-SA-teh-lite in-stuh-BIH-lih-tee)
    Pronunciation of dictionary term "microsatellite instability"
    A change that occurs in certain cells (such as cancer cells) in which the number of repeated DNA bases in a microsatellite (a short, repeated sequence of DNA) is different from what it was when the microsatellite was inherited. Microsatellite instability may be caused by mistakes that don’t get corrected when DNA is copied in a cell. It is found most often in colorectal cancer, gastric cancer, and endometrial cancer, but it may also be found in many other types of cancer. Knowing whether a cancer has microsatellite instability may help plan the best treatment. Also called MSI.
  microsatellite instability-high cancer: (MY-kroh-SA-teh-lite in-stuh-BIH-lih-tee-hy KAN-ser)
    Pronunciation of dictionary term "microsatellite instability-high cancer"
    Describes cancer cells that have a high number of mutations (changes) within microsatellites. For example, microsatellite testing that shows mutations in 30% or more microsatellites is called microsatellite instability-high. Microsatellites are short, repeated sequences of DNA. Microsatellite instability-high cancer cells may have a defect in the ability to correct mistakes that occur when DNA is copied in the cell. Microsatellite instability is found most often in colorectal cancer, gastric cancer, and endometrial cancer, but it may also be found in many other types of cancer. Knowing whether cancer is microsatellite instability-high may help plan the best treatment. Also called MSI-H cancer.
  microsatellite tumor: (MY-kroh-SA-teh-lite TOO-mer)
    Pronunciation of dictionary term "microsatellite tumor"
    A small group of tumor cells in an area beside or below, but separate from, the primary (original) melanoma. Microsatellite tumors can only be seen with a microscope. Having a microsatellite tumor is a sign that the melanoma has spread from where it first formed.
  microscope: (MY-kroh-SKOPE)
    Pronunciation of dictionary term "microscope"
    An instrument that is used to look at cells and other small objects that cannot be seen with the eye alone.
  microscopic: (MY-kroh-SKAH-pik)
    Pronunciation of dictionary term "microscopic"
    Too small to be seen without a microscope.
  microscopic description: (MY-kroh-SKAH-pik deh-SKRIP-shun)
    Pronunciation of dictionary term "microscopic description"
    A description of what cells or a tissue sample taken during a biopsy look like when viewed under a microscope. The microscopic description may include the type and number of cells seen in the tissue sample and how they compare with normal cells. It may also include any special cell features and results from other laboratory tests done on the cell or tissue sample. Microscopic descriptions are usually included in a pathology report, which may be used to help diagnose diseases, such as cancer, and plan treatment.
    More Information
    - Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet)
  microsphere: (MY-kroh-sfeer)
    Pronunciation of dictionary term "microsphere"
    A very tiny, hollow, round particle made from glass, ceramic, plastic, or other materials. Microspheres injected into blood vessels that feed a tumor may kill the tumor by blocking its blood supply. They can also be filled with a substance that may help kill more tumor cells.
  microstaging: (MY-kroh-STAY-jing)
    Pronunciation of dictionary term "microstaging"
    A technique used to help determine the stage (extent) of melanoma and certain squamous cell cancers. A sample of skin that contains tumor tissue is examined under a microscope to find out how thick the tumor is and/or how deeply the tumor has grown into the skin or connective tissues.
  microtubule: (MY-kroh-TOO-byool)
    Pronunciation of dictionary term "microtubule"
    A narrow, hollow tube-like structure found in the cytoplasm (the fluid inside a cell) of plant and animal cells. Microtubules help support the shape of a cell. They also help chromosomes move during cell division and help small structures called cell organelles to move inside the cell. Certain anticancer drugs keep microtubules from working the way they should. This may help keep cancer cells from dividing.
  microwave acupuncture: (MY-kroh-WAYV AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "microwave acupuncture"
    A type of acupuncture in which a microwave device is attached to an acupuncture needle to give microwave radiation at an acupuncture point.
  microwave therapy: (MY-kroh-WAYV THAYR-uh-pee)
    Pronunciation of dictionary term "microwave therapy"
    A type of treatment in which body tissue is exposed to high temperatures to damage and kill cancer cells or to make cancer cells more sensitive to the effects of radiation and certain anticancer drugs. Also called microwave thermotherapy.
  microwave thermotherapy: (MY-kroh-WAYV THER-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "microwave thermotherapy"
    A type of treatment in which body tissue is exposed to high temperatures to damage and kill cancer cells or to make cancer cells more sensitive to the effects of radiation and certain anticancer drugs. Also called microwave therapy.
  midazolam: (mih-DAY-zoh-lam)
    Pronunciation of dictionary term "midazolam"
    A drug used to treat anxiety and tension and to relax muscles. It is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of benzodiazepine. Also called midazolam hydrochloride and Versed.
  midazolam hydrochloride: (mih-DAY-zoh-lam HY-droh-KLOR-ide)
    Pronunciation of dictionary term "midazolam hydrochloride"
    A drug used to treat anxiety and tension and to relax muscles. Midazolam hydrochloride is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of benzodiazepine. Midazolam is the active ingredient of midazolam hydrochloride. Also called Versed.
  midostaurin: (MY-doh-STAW-rin)
    Pronunciation of dictionary term "midostaurin"
    A drug used alone or with other anticancer drugs to treat adults with certain types of acute myeloid leukemia, mast cell leukemia, or systemic mastocytosis. It is also being studied in the treatment of other types of cancer. Midostaurin blocks certain proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Midostaurin is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called N-benzoyl-staurosporine, PKC412, and Rydapt.
    More Information
    - Midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin)
  mifamurtide: (mih-FAM-yoor-tide)
    Pronunciation of dictionary term "mifamurtide"
    A drug being studied in the treatment of young adults with bone cancer that has gotten worse or come back. Mifamurtide activates certain types of white blood cells and helps the immune system kill cancer cells. It is a type of immunostimulant. Also called L-MTP-PE, MEPACT, and muramyl tripeptide phosphatidylethanolamine.
  Mifeprex: (MIH-feh-PREX)
    Pronunciation of dictionary term "Mifeprex"
    A drug used to end early pregnancies. It is also being studied in the treatment of some types of cancer and other conditions. Mifeprex blocks the action of progesterone, a hormone that helps some cancers grow. It is a type of antiprogesterone. Also called mifepristone and RU 486.
  mifepristone: (MIH-feh-PRIS-tone)
    Pronunciation of dictionary term "mifepristone"
    A drug used to end early pregnancies. It is also being studied in the treatment of some types of cancer and other conditions. Mifepristone blocks the action of progesterone, a hormone that helps some cancers grow. It is a type of antiprogesterone. Also called Mifeprex and RU 486.
  milatuzumab: (MIH-luh-TOO-zoo-mab)
    Pronunciation of dictionary term "milatuzumab"
    A substance being studied in the treatment of multiple myeloma and several other types of cancer. It binds to CD74, a protein on the surface of myeloma cells and certain other types of cells. It may help kill cancer cells. Milatuzumab is a type of monoclonal antibody. Also called hLL1 and IMMU-110.
  milk duct: (... dukt)
    Pronunciation of dictionary term "milk duct"
    A thin tube in the breast that carries milk from the breast lobules to the nipple. Also called breast duct.
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
  milk thistle: (milk THIH-sul)
    Pronunciation of dictionary term "milk thistle"
    A plant that has been used in some cultures to treat certain medical problems, including stomach, liver, and gallbladder disorders. The active extract of milk thistle seeds is called silymarin. It is being studied in the prevention of liver damage caused by some cancer treatments. Also called Silybum marianum.
    More Information
    - Milk Thistle
  milligram: (MIH-lih-gram)
    Pronunciation of dictionary term "milligram"
    A measure of weight. A milligram is approximately 450,000 times smaller than a pound and 28,000 times smaller than an ounce.
  milliliter: (MIH-luh-LEE-ter)
    Pronunciation of dictionary term "milliliter"
    A measure of volume in the metric system. One thousand milliliters equal one liter. Also called cc, cubic centimeter, and mL.
  millimeter: (MIH-luh-MEE-ter)
    Pronunciation of dictionary term "millimeter"
    A measure of length in the metric system. A millimeter is one thousandth of a meter. There are 25 millimeters in an inch.
    Tumor sizes are often measured in millimeters (mm) or centimeters. Common items that can be used to show tumor size in mm include: a sharp pencil point (1 mm), a new crayon point (2 mm), a pencil-top eraser (5 mm), a pea (10 mm), a peanut (20 mm), and a lime (50 mm).
    Drawing shows different sizes of common items in millimeters (mm): a sharp pencil point (1 mm), a new crayon point (2 mm), a pencil-top eraser (5 mm), a pea (10 mm), a peanut (20 mm), and a lime (50 mm). Also shown is a 2-centimeter (cm) ruler that shows 10 mm is equal to 1 cm.
  millimole: (MIH-lih-mole)
    Pronunciation of dictionary term "millimole"
    The amount of a substance equal to a thousandth of a mole (a measure of the amount of a substance). Also called mmol.
  mind-body exercise: (mind-BAH-dee EK-ser-SIZE)
    Pronunciation of dictionary term "mind/body exercise"
    A form of exercise that combines body movement, mental focus, and controlled breathing to improve strength, balance, flexibility, and overall health. Examples of mind-body exercises are yoga, tai chi, and qigong.
  mind-body modality: (mind-BAH-dee moh-DA-lih-tee)
    Pronunciation of dictionary term "mind-body modality"
    A health practice that combines mental focus, controlled breathing, and body movements to help relax the body and mind. It may be used to help control pain, stress, anxiety, and depression, and for overall health. Examples of mind-body modalities include meditation, hypnosis, guided imagery, yoga, and tai chi. A mind-body modality is a type of complementary and alternative medicine. Also called mind-body practice.
  mind-body practice: (mind-BAH-dee PRAK-tis)
    Pronunciation of dictionary term "mind-body practice"
    A health practice that combines mental focus, controlled breathing, and body movements to help relax the body and mind. It may be used to help control pain, stress, anxiety, and depression, and for overall health. Examples of mind-body practices include meditation, hypnosis, guided imagery, yoga, and tai chi. A mind-body practice is a type of complementary and alternative medicine. Also called mind-body modality.
  mindfulness relaxation: (... ree-lak-SAY-shun)
    Pronunciation of dictionary term "mindfulness relaxation"
    A type of meditation based on the concept of being “mindful,” or having increased awareness, of the present. It uses breathing methods, guided imagery, and other practices to relax the body and mind and help reduce stress.
  mineral: (MIH-neh-rul)
    Pronunciation of dictionary term "mineral"
    In medicine, a mineral is a nutrient that is needed in small amounts to keep the body healthy. Mineral nutrients include the elements calcium, magnesium, and iron.
  mineral oil: (MIH-neh-rul oyl)
    Pronunciation of dictionary term "mineral oil"
    A type of oil that is made from petroleum (mixture of oily liquids found in the earth). Mineral oil is used in laxatives, lubricants, creams, and lotions.
  mini-transplant: (MIH-nee-TRANZ-plant)
    Pronunciation of dictionary term "mini-transplant"
    A type of donor stem cell transplant in which a patient receives lower doses of chemotherapy and/or radiation therapy than in a standard transplant. The lower doses of anticancer therapy do not kill all of the blood-forming stem cells or all of the cancer cells in the patient's bone marrow. However, the anticancer therapy is still strong enough to suppress the patient's immune system and prevent rejection of the donor stem cells. The patient’s stem cells and those from the donor both live in the patient’s body for a time after a mini-transplant. Once the cells from the donor begin to grow and divide in the bone marrow, they replace the patient’s own bone marrow cells and destroy the remaining cancer cells. A mini-transplant may be an option for certain people who are older or who are not healthy enough to receive a standard donor stem cell transplant with high-dose chemotherapy. Also called non-myeloablative transplant and reduced-intensity transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  minimal residual disease: (MIH-nih-mul ree-ZID-yoo-ul dih-ZEEZ)
    Pronunciation of dictionary term "minimal residual disease"
    A term used to describe a very small number of cancer cells that remain in the body during or after treatment. Minimal residual disease can be found only by highly sensitive laboratory methods that are able to find one cancer cell among one million normal cells. Checking to see if there is minimal residual disease may help plan treatment, find out how well treatment is working or if cancer has come back, or make a prognosis. Minimal residual disease testing is used mostly for blood cancers such as lymphoma and leukemia. Also called measurable residual disease and MRD.
  minimal sedation: (MIH-nih-mul seh-DAY-shun)
    Pronunciation of dictionary term "minimal sedation"
    A level of sedation in which a person is very relaxed and may be awake. The person is able to answer questions and follow instructions. Minimal sedation is caused by special drugs and is used to help relieve anxiety during certain medical or surgical procedures. Also called anxiolysis.
  minimally invasive surgery: (MIH-nih-muh-lee in-VAY-siv SER-juh-ree)
    Pronunciation of dictionary term "minimally invasive surgery"
    Surgery that is done using small incisions (cuts) and few stitches. During minimally invasive surgery, one or more small incisions may be made in the body. A laparoscope (thin, tube-like instrument with a light and a lens for viewing) is inserted through one opening to guide the surgery. Tiny surgical instruments are inserted through other openings to do the surgery. Minimally invasive surgery may cause less pain, scarring, and damage to healthy tissue, and the patient may have a faster recovery than with traditional surgery.
  minocycline-EDTA: (mih-noh-SY-kleen ...)
    Pronunciation of dictionary term "minocycline-EDTA"
    A substance being studied in the prevention of bacterial infections that occur in catheters (thin tubes that carry fluids into or out of the body). It is a combination of minocycline, an antibiotic that blocks the growth of bacteria, and EDTA, a substance that keeps blood clots from forming. Minocycline-EDTA removes metals that bacteria use to form biofilms (thin layers stuck to surfaces). Also called M-EDTA.
  MIP test: (… test)
    Pronunciation of dictionary term "MIP test"
    A test that measures the strength of the muscles used in breathing. A person inhales and exhales through a device called a manometer, and the pressures are recorded by a computer. Also called maximum inspiratory pressure test.
  Miraluma test: (meer-uh-LOO-muh ...)
    Pronunciation of dictionary term "Miraluma test"
    A type of breast imaging test that is used to detect cancer cells in the breasts of some women who have had abnormal mammograms, or who have dense breast tissue. It is not used for screening or in place of a mammogram. In this test, a woman receives an injection of a small amount of a radioactive substance called technetium 99, which is taken up by cancer cells, and a gamma camera is used to take pictures of the breasts. Also called scintimammography and sestamibi breast imaging.
  miRNA: A type of RNA found in cells and in blood. miRNA are smaller than many other types of RNA and can bind to messenger RNAs (mRNAs) to block them from making proteins. miRNA are being studied in the diagnosis and treatment of cancer. Also called microRNA.
  mirtazapine: (mir-TA-zuh-peen)
    Pronunciation of dictionary term "mirtazapine"
    A drug used to treat depression. Mirtazapine increases the levels of the chemicals serotonin and norepinephrine in the brain, which helps improve mood. It is a type of antidepressant. Also called Remeron.
  mirvetuximab soravtansine: (MEER-veh-TUK-sih-mab SOH-rav-TAN-seen)
    Pronunciation of dictionary term "mirvetuximab soravtansine"
    A drug used to treat adults with folate receptor alpha–positive ovarian epithelial, fallopian tube, or primary peritoneal cancer that has not gotten better after treatment with platinum chemotherapy. It is used in patients whose cancer was treated with one to three other systemic therapies. It is also being studied in the treatment of other types of cancer. Mirvetuximab soravtansine contains a monoclonal antibody that binds to a protein called folate receptor alpha, which is found on some cancer cells. It also contains an anticancer drug, which may help kill cancer cells. Mirvetuximab soravtansine is a type of antibody-drug conjugate. Also called Elahere.
    More Information
    - Mirvetuximab Soravtansine-gynx (https://www.cancer.gov/about-cancer/treatment/drugs/mirvetuximab-soravtansine-gynx)
  miscarriage: (MIS-kayr-ij)
    Pronunciation of dictionary term "miscarriage"
    An unexpected loss of pregnancy before the 20th week of pregnancy. Most miscarriages happen very early in pregnancy, often before a person even knows they are pregnant. Signs include vaginal spotting or bleeding, pain or cramping in the abdomen or lower back, and the passing of fluid or tissue from the vagina. Miscarriages often occur because of genetic problems in the fetus. Maternal factors or conditions that could contribute to having a miscarriage include problems with the uterus or cervix, infection, hormone problems, severe malnutrition, smoking, drinking alcohol, taking certain medicines, or exposure to radiation. Being older or having certain diseases, such as polycystic ovary syndrome, uncontrolled diabetes, congenital heart disease, thyroid or kidney disease, and immune system disorders, may also put a person at higher risk of having a miscarriage. Also called spontaneous abortion.
  mismatch repair deficiency: (MIS-match reh-PAYR deh-FIH-shun-see)
    Pronunciation of dictionary term "mismatch repair deficiency"
    Describes cells that have mutations (changes) in certain genes that are involved in correcting mistakes made when DNA is copied in a cell. Mismatch repair (MMR) deficient cells usually have many DNA mutations, which may lead to cancer. MMR deficiency is most common in colorectal cancer, other types of gastrointestinal cancer, and endometrial cancer, but it may also be found in cancers of the breast, prostate, bladder, and thyroid and in an inherited disorder called Lynch syndrome. Knowing if a tumor is MMR deficient may help plan treatment or predict how well the tumor will respond to treatment. Also called deficient DNA mismatch repair, deficient mismatch repair, dMMR, and MMR deficiency.
  misoprostol: (MY-soh-PROS-tole)
    Pronunciation of dictionary term "misoprostol"
    A radioprotective agent that belongs to the family of drugs called prostaglandins.
  missense mutation: (MIS-sens myoo-TAY-shun)
    Pronunciation of dictionary term "missense mutation"
    A change in the DNA sequence of a gene that results in one amino acid (protein building block) being replaced with an amino acid that is different from the usual one at that position in the gene. Some missense mutations have little or no effect on the function of the protein, while others may change the function of the protein. Also called missense variant.
    More Information
    - Missense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Missense-Mutation)
  missense variant: (MIS-sens VAYR-ee-unt)
    Pronunciation of dictionary term "missense variant"
    A change in the DNA sequence of a gene that results in one amino acid (protein building block) being replaced with an amino acid that is different from the usual one at that position in the gene. Some missense variants have little or no effect on the function of the protein, while others may change the function of the protein. Also called missense mutation.
    More Information
    - Missense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Missense-Mutation)
  missing data: (MIH-sing ...)
    Pronunciation of dictionary term "missing data"
    Data that would be meaningful for the analysis of a given endpoint but were not collected. Studies with more missing data, will have lower statistical power.
  mistletoe: (MIH-sul-toh)
    Pronunciation of dictionary term "mistletoe"
    A semiparasitic plant that grows on some types of trees. Mistletoe extracts are being studied as treatments for cancer.
    More Information
    - Mistletoe Extracts
  mistletoe lectin: (MIH-sul-toh LEK-tin)
    Pronunciation of dictionary term "mistletoe lectin"
    A substance that comes from the mistletoe plant and that is being studied as a treatment for cancer. A lectin is a complex molecule that has both protein and sugars. Lectins are able to bind to the outside of a cell and cause biochemical changes in it. Lectins are made by both animals and plants.
    More Information
    - Mistletoe Extracts (Health Professional Version) (https://www.cancer.gov/about-cancer/treatment/cam/hp/mistletoe-pdq)
  Mithracin: (MITH-ruh-sin)
    Pronunciation of dictionary term "Mithracin"
    A drug used to treat some types of testicular cancer. It is also used to treat a higher-than-normal amounts of calcium in the blood or urine. Mithracin binds to DNA and prevents cells from making RNA and proteins. It is a type of antineoplastic antibiotic. Also called mithramycin and plicamycin.
  mithramycin: (MITH-ruh-MY-sin)
    Pronunciation of dictionary term "mithramycin"
    A drug used to treat some types of testicular cancer. It is also used to treat a higher-than-normal amounts of calcium in the blood or urine. Mithramycin binds to DNA and prevents cells from making RNA and proteins. It is a type of antineoplastic antibiotic. Also called Mithracin and plicamycin.
  mitigate: (MIH-tih-gayt)
    Pronunciation of dictionary term "mitigate"
    To make milder or less painful.
  mitochondria: (MY-toh-KON-dree-uh)
    Pronunciation of dictionary term "mitochondria"
    Small structures in a cell that are found in the cytoplasm (fluid that surrounds the cell nucleus). Mitochondria make most of the energy for the cell and have their own genetic material that is different from the genetic material found in the nucleus. Many diseases are caused by mutations (changes) in the DNA of mitochondria. Mitochondria are cell organelles.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  mitoguazone dihydrochloride: (MY-toh-gwah-ZONE dy-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "mitoguazone dihydrochloride"
    A substance being studied in the treatment of some leukemias and lymphomas. It blocks the growth of cells and may cause cancer cells to die. It is a type of polyamine synthesis inhibitor.
  mitolactol: (MY-toh-LAK-tole)
    Pronunciation of dictionary term "mitolactol"
    An anticancer drug that belongs to the family of drugs called alkylating agents.
  mitomycin: (MY-toh-MY-sin)
    Pronunciation of dictionary term "mitomycin"
    A drug that comes from the bacterium Streptomyces and is used alone under the brand name Jelmyto to treat adults with a certain type of urothelial cancer and with other drugs to treat certain types of stomach cancer and pancreatic cancer. It is also being studied in the treatment of other types of cancer. Mitomycin damages the cell’s DNA and may kill cancer cells. It is a type of antineoplastic antibiotic and a type of alkylating agent.
    More Information
    - Mitomycin (https://www.cancer.gov/about-cancer/treatment/drugs/mitomycin)
  mitosis: (my-TOH-sis)
    Pronunciation of dictionary term "mitosis"
    The process by which a single parent cell divides to make two new daughter cells. Each daughter cell receives a complete set of chromosomes from the parent cell. This process allows the body to grow and replace cells.
  mitotane: (MY-toh-tane)
    Pronunciation of dictionary term "mitotane"
    An anticancer drug used in treating adrenocortical cancer and ACTH-producing pituitary tumors (Cushing disease).
  mitotic activity: (my-TAH-tik ak-TIH-vih-tee)
    Pronunciation of dictionary term "mitotic activity"
    Having to do with the presence of dividing (proliferating) cells. Cancer tissue generally has more mitotic activity than normal tissues.
  mitotic cycle: (my-TAH-tik SY-kul)
    Pronunciation of dictionary term "mitotic cycle"
    The process a cell goes through each time it divides. The mitotic cycle consists of a series of steps during which the chromosomes and other cell material double to make two copies. The cell then divides into two daughter cells, each receiving one copy of the doubled material. The mitotic cycle is complete when each daughter cell is surrounded by its own outer membrane. Also called cell cycle.
  mitotic index: (my-TAH-tik IN-dex)
    Pronunciation of dictionary term "mitotic index"
    In a population of cells, the ratio of the number of cells undergoing mitosis (cell division) to the number of cells not undergoing mitosis.
  mitotic inhibitor: (my-TAH-tik in-HIH-bih-ter)
    Pronunciation of dictionary term "mitotic inhibitor"
    A type of drug that blocks cell growth by stopping mitosis (cell division). They are used to treat cancer. Also called antimitotic agent.
  mitotic rate: (my-TAH-tik rayt)
    Pronunciation of dictionary term "mitotic rate"
    A measure of how fast cancer cells are dividing and growing. To find the mitotic rate, the number of cells dividing in a certain amount of cancer tissue is counted. Mitotic rate is used to help find the stage of melanoma (a type of skin cancer) and other types of cancer. Higher mitotic rates are linked with lower survival rates. Also called MR.
  mitoxantrone hydrochloride: (MY-toh-ZAN-trone HY-droh-KLOR-ide)
    Pronunciation of dictionary term "mitoxantrone hydrochloride"
    A drug used with other drugs to treat acute myeloid leukemia in adults, advanced prostate cancer that did not get better with hormone therapy, and certain forms of multiple sclerosis. It is also being studied in the treatment of other types of cancer. Mitoxantrone hydrochloride damages the cell’s DNA and may kill cancer cells. It also blocks a certain enzyme needed for cell division and DNA repair. Mitoxantrone hydrochloride may also stop certain immune cells from causing damage to the brain and spinal cord. It is a type of antineoplastic antibiotic and a type of topoisomerase inhibitor.
    More Information
    - Mitoxantrone Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/mitoxantronehydrochloride)
  Mitozytrex: (MY-toh-ZY-trex)
    Pronunciation of dictionary term "Mitozytrex"
    A drug used to treat advanced cancer of the stomach and pancreas that has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Mitozytrex comes from bacteria. It damages the cell’s DNA and may kill cancer cells. It is a type of anticancer antibiotic. Also called mitomycin C and Mutamycin.
  mivobulin isethionate: (MY-voh-BYOO-lin I-seh-THY-oh-nayt)
    Pronunciation of dictionary term "mivobulin isethionate"
    An anticancer drug that belongs to the family of drugs called mitotic inhibitors. Also called CI-980.
  mixed germ cell tumor: (mikst jerm sel TOO-mer)
    Pronunciation of dictionary term "mixed germ cell tumor"
    A rare type of cancer that is made up of at least two different types of germ cell tumors (tumors that begin in cells that form sperm or eggs). These may include choriocarcinoma, embryonal carcinoma, yolk sac tumor, teratoma, and seminoma. Mixed germ cell tumors occur most often in the ovary or testicle, but they may also occur in the chest, abdomen, or brain.
  mixed glioma: (mikst glee-OH-muh)
    Pronunciation of dictionary term "mixed glioma"
    A brain tumor that forms from more than one type of brain cell, usually astrocytes and oligodendrocytes.
  mixed neuronal-glial tumor: (mikst noor-OH-nul-GLEE-ul TOO-mer)
    Pronunciation of dictionary term "mixed neuronal-glial tumor"
    One of a group of rare tumors that contain a mixture of nerve cells and glial cells (supporting cells) of the brain or spinal cord. There are many different types of mixed neuronal-glial tumors, and they can occur anywhere in the brain or spinal cord. Most mixed neuronal-glial tumors are not cancer and tend to grow slowly. However, they can grow and press on nearby brain tissue, which can cause seizures, a buildup of fluid and increased pressure in the brain, and other problems. Mixed neuronal-glial tumors can occur at any age but are more common in children and young adults. Also called glioneuronal tumor.
  MK-0646: A substance being studied in the treatment of many types of cancer. MK-0646 binds to a protein called insulin-like growth factor receptor (IGFR) on the surface of cells. This may prevent the cells from growing when IGF is present. It may also kill cancer cells. MK-0646 is a type of monoclonal antibody. Also called anti-IGF1R recombinant monoclonal antibody MK-0646.
  MK0752: A substance being studied in the treatment of cancer. It blocks signals between growing cells and may kill cancer cells. It is a type of signal transduction inhibitor.
  mL: A measure of volume in the metric system. One thousand mLs equal one liter. Also called cc, cubic centimeter, and milliliter.
  MLH1 gene: (... jeen)
    Pronunciation of dictionary term "MLH1 gene"
    A gene that makes a protein involved in repairing DNA errors that can occur when DNA is copied in a cell. Mutations (changes) in the MLH1 gene may cause unrepaired errors in DNA to build up in the cell, which may lead to abnormal cell growth and cancer. MLH1 gene mutations have been found in the inherited conditions Lynch syndrome and Muir-Torre syndrome. People with these conditions have an increased risk of developing colorectal cancer and other types of cancer. The MLH1 gene is a type of DNA mismatch repair (MMR) gene.
    More Information
    - MLH1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/mlh1)
  MLN1202: A substance being studied as a treatment for atherosclerosis (a build-up of fat in the arteries). It is also being studied in the treatment of cancers that spread to the bone. MLN1202 binds to a protein called CCR2, which is found on the surface of certain bone cells, white blood cells, and cancer cells. MLN1202 blocks the action of a substance that is involved in keeping healthy bone mass. It may help keep the cancer cells from spreading to and growing in the bone. It is a type of monoclonal antibody. Also called anti-CCR2 monoclonal antibody MLN1202.
  MLN2704: A substance that is being studied in the treatment of prostate cancer. It belongs to the family of drugs called antibody drug conjugates. Also called MLN591DM1.
  MLN518: A substance being studied in the treatment of some types of cancer. It may stop cancer cell growth by blocking certain enzymes. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called CT53518 and tandutinib.
  MLN591DM1: A substance that is being studied in the treatment of prostate cancer. It belongs to the family of drugs called antibody drug conjugates. Also called MLN2704.
  MMMT: A rare type of tumor that is a mixture of carcinoma and sarcoma cells. MMMT usually occurs in the uterus. Also called malignant mixed Müllerian tumor.
  mmol: The amount of a substance equal to a thousandth of a mole (a measure of the amount of a substance). Also called millimole.
  MMR deficiency: (... deh-FIH-shun-see)
    Pronunciation of dictionary term "MMR deficiency"
    Describes cells that have mutations (changes) in certain genes that are involved in correcting mistakes made when DNA is copied in a cell. Mismatch repair (MMR) deficient cells usually have many DNA mutations, which may lead to cancer. MMR deficiency is most common in colorectal cancer, other types of gastrointestinal cancer, and endometrial cancer, but it may also be found in cancers of the breast, prostate, bladder, and thyroid and in an inherited disorder called Lynch syndrome. Knowing if a tumor is MMR deficient may help plan treatment or predict how well the tumor will respond to treatment. Also called deficient DNA mismatch repair, deficient mismatch repair, dMMR, and mismatch repair deficiency.
  MOA: In medicine, a term used to describe how a drug or other substance produces an effect in the body. For example, a drug’s MOA could be how it affects a specific target in a cell, such as an enzyme, or a cell function, such as cell growth. Knowing the MOA of a drug may help provide information about the safety of the drug and how it affects the body. It may also help identify the right dose of a drug and which patients are most likely to respond to treatment. Also called mechanism of action.
  MOAB Ch14.18: A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF), aldesleukin (IL-2), and 13-cis-retinoic acid to treat children with high-risk neuroblastoma. It is used in patients whose disease has gotten better with other anticancer treatment. MOAB Ch14.18 binds to a substance called GD2, which is found on some types of cancer cells. MOAB Ch14.18 may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Ch14.18, dinutuximab, monoclonal antibody Ch14.18, and Unituxin.
    More Information
    - Dinutuximab (https://www.cancer.gov/about-cancer/treatment/drugs/dinutuximab)
  MoAb HuM195: A substance being studied in the treatment of myelodysplastic syndromes and some types of leukemia. It binds to CD33, a protein on the surface of certain normal blood stem cells and some abnormal blood cells. It causes the immune system to kill these cells. MoAb HuM195 is a type of monoclonal antibody. Also called lintuzumab and monoclonal antibody HuM195.
  mobocertinib succinate: (MOH-boh-SER-tih-nib SUK-sih-nayt)
    Pronunciation of dictionary term "mobocertinib succinate"
    A drug used to treat adults with non-small cell lung cancer that has spread and has certain mutations (changes) in the EGFR gene. It is used in patients whose cancer got worse during or after platinum chemotherapy. It is also being studied in the treatment of other conditions. Mobocertinib succinate blocks certain proteins made by the mutated EGFR gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Exkivity.
    More Information
    - Mobocertinib Succinate (https://www.cancer.gov/about-cancer/treatment/drugs/mobocertinib-succinate)
  mocetinostat: (MOH-seh-TIH-noh-stat)
    Pronunciation of dictionary term "mocetinostat"
    A substance being studied in the treatment of several types of cancer. It blocks enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase (HDAC) inhibitor. Also called MGCD0103.
  modafinil: (moh-DA-fih-nil)
    Pronunciation of dictionary term "modafinil"
    A drug that is being studied as a treatment for fatigue in patients with cancer. It belongs to the family of drugs called stimulants.
  modality: (moh-DA-lih-tee)
    Pronunciation of dictionary term "modality"
    A method of treatment. For example, surgery and chemotherapy are treatment modalities.
  moderate sedation: (MAH-deh-rut seh-DAY-shun)
    Pronunciation of dictionary term "moderate sedation"
    A level of sedation in which a person is asleep but wakes when spoken to or touched. Moderate sedation is caused by special drugs and is used to help relieve anxiety during certain medical or surgical procedures. Drugs that relieve pain may be given at the same time. Also called conscious sedation.
  modified FOLFOX-6: (MAH-dih-FIDE ...)
    Pronunciation of dictionary term "modified FOLFOX-6"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called modified FOLFOX-6 regimen.
  modified FOLFOX-6 regimen: (MAH-dih-FIDE ... REH-jih-men)
    Pronunciation of dictionary term "modified FOLFOX-6 regimen"
    An abbreviation for a combination chemotherapy regimen that is used to treat colorectal cancer. It includes the drugs leucovorin calcium (folinic acid), fluorouracil, and oxaliplatin. There are several different FOLFOX regimens that differ in the doses and ways in which the three drugs are given. Also called modified FOLFOX-6.
  modified radical hysterectomy: (MAH-dih-FIDE RA-dih-kul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "modified radical hysterectomy"
    Surgery to remove the uterus, cervix, upper part of the vagina, and nearby ligaments and tissues. The ovaries, fallopian tubes, or nearby lymph nodes may also be removed. A modified radical hysterectomy removes fewer tissues and/or organs than a radical hysterectomy.
  modified radical mastectomy: (MAH-dih-FIDE RA-dih-kul ma-STEK-toh-mee)
    Pronunciation of dictionary term "modified radical mastectomy"
    Surgery to remove the whole breast, which may include the nipple, areola (the dark-colored skin around the nipple), and skin over the breast. Most of the lymph nodes under the arm are also removed.
    More Information
    - Breast Cancer Treatment
    Modified radical mastectomy. The whole breast and most of the lymph nodes under the arm are removed.
    Modified radical mastectomy; the drawing on the left shows the removal of the whole breast, including the lymph nodes under the arm. The drawing on the right shows a cross-section of the breast, including the fatty tissue and chest wall (ribs and muscle). A tumor in the breast is also shown.
  modified radical vulvectomy: (MAH-dih-FIDE RA-dih-kul vul-VEK-toh-mee)
    Pronunciation of dictionary term "modified radical vulvectomy"
    Surgery to remove most, but not all, of the vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina). The clitoris may not be removed. Sometimes lymph nodes in the groin area are also removed. Also called partial radical vulvectomy.
  modulate: (MAH-juh-layt)
    Pronunciation of dictionary term "modulate"
    To adjust, or change.
  mogamulizumab: (moh-GAM-yoo-LIH-zoo-mab)
    Pronunciation of dictionary term "mogamulizumab"
    A drug used to treat adults with mycosis fungoides or Sezary syndrome (types of cutaneous T-cell lymphoma) that came back or did not get better after treatment with at least one systemic therapy. It is also being studied in the treatment of other types of cancer. Mogamulizumab binds to a protein called CCR4, which is found on some T cells (a type of white blood cell) and some types of lymphoma cells. Mogamulizumab may block this protein and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Poteligeo.
    More Information
    - Mogamulizumab-kpkc (https://www.cancer.gov/about-cancer/treatment/drugs/mogamulizumabkpkc)
  Mohs micrographic surgery: (moze MY-kroh-GRA-fik SER-juh-ree)
    Pronunciation of dictionary term "Mohs micrographic surgery"
    A procedure used to treat certain types of skin cancer, penile cancer, mouth cancer (especially cancer of the lip), and soft tissue sarcoma of the skin. During Mohs micrographic surgery, the visible tumor and a thin layer of tissue around it is removed. The tissue is then checked under a microscope for the presence of cancer cells at all edges of the tumor. If cancer cells are seen, another thin layer of tissue is removed and checked under the microscope. This process is repeated until no more cancer cells are seen. Mohs micrographic surgery removes as little normal tissue as possible. It is most often used to remove skin cancers on the scalp, face, lip, ear, neck, hands, feet, and genitals, including cancer on or just under the skin of the penis. Also called Mohs surgery.
    Mohs surgery. A surgical procedure to remove a visible lesion on the skin in several steps. First, a thin layer of cancerous tissue is removed. Then, a second thin layer of tissue is removed and viewed under a microscope to check for cancer cells. More layers are removed one at a time until the tissue viewed under a microscope shows no remaining cancer. This type of surgery is used to remove as little normal tissue as possible.
    Mohs surgery; drawing shows a visible lesion on the skin. The pullout shows a block of skin with cancer in the epidermis (outer layer of the skin) and the dermis (inner layer of the skin). A visible lesion is shown on the skin’s surface. Four numbered blocks show the removal of thin layers of the skin one at a time until all the cancer is removed.
  Mohs surgery: (moze SER-juh-ree)
    Pronunciation of dictionary term "Mohs surgery"
    A procedure used to treat certain types of skin cancer, penile cancer, mouth cancer (especially cancer of the lip), and soft tissue sarcoma of the skin. During Mohs surgery, the visible tumor and a thin layer of tissue around it is removed. The tissue is then checked under a microscope for the presence of cancer cells at all edges of the tumor. If cancer cells are seen, another thin layer of tissue is removed and checked under the microscope. This process is repeated until no more cancer cells are seen. Mohs surgery removes as little normal tissue as possible. It is most often used to remove skin cancers on the scalp, face, lip, ear, neck, hands, feet, and genitals, including cancer on or just under the skin of the penis. Also called Mohs micrographic surgery.
    Mohs surgery. A surgical procedure to remove a visible lesion on the skin in several steps. First, a thin layer of cancerous tissue is removed. Then, a second thin layer of tissue is removed and viewed under a microscope to check for cancer cells. More layers are removed one at a time until the tissue viewed under a microscope shows no remaining cancer. This type of surgery is used to remove as little normal tissue as possible.
    Mohs surgery; drawing shows a visible lesion on the skin. The pullout shows a block of skin with cancer in the epidermis (outer layer of the skin) and the dermis (inner layer of the skin). A visible lesion is shown on the skin’s surface. Four numbered blocks show the removal of thin layers of the skin one at a time until all the cancer is removed.
  moist reaction: (… ree-AK-shun)
    Pronunciation of dictionary term "moist reaction"
    A skin problem caused by radiation therapy. The affected skin peels and becomes moist and painful. Sores or ulcers can also develop, which may lead to infection. A moist reaction usually occurs in areas where the skin folds, such as under the breasts, behind the ears, or on the buttocks. A moist reaction usually goes away 2 or 3 weeks after radiation therapy has ended.
  molar pregnancy: (MOH-ler PREG-nun-see)
    Pronunciation of dictionary term "molar pregnancy"
    A slow-growing tumor that develops from trophoblastic cells (cells that help an embryo attach to the uterus and help form the placenta) after fertilization of an egg by a sperm. A molar pregnancy contains many cysts (sacs of fluid). It is usually benign (not cancer) but it may spread to nearby tissues (invasive mole). It may also become a malignant tumor called choriocarcinoma. Molar pregnancy is the most common type of gestational trophoblastic tumor. Also called hydatidiform mole.
  mold: (mold)
    Pronunciation of dictionary term "mold"
    A form of fungus. Some molds can cause disease in humans.
  mole: (mole)
    Pronunciation of dictionary term "mole"
    A benign (not cancer) growth on the skin that is formed by a cluster of melanocytes (cells that make a substance called melanin, which gives color to skin and eyes). A mole is usually dark and may be raised from the skin. Also called nevus.
    More Information
    - Common Moles, Dysplastic Nevi, and Risk of Melanoma (https://www.cancer.gov/types/skin/moles-fact-sheet)
  molecular characterization: (muh-LEH-kyoo-ler KAYR-ik-ter-rih-ZAY-shun)
    Pronunciation of dictionary term "molecular characterization"
    A broad term that refers to using molecular markers, including DNA, RNA, and proteins, to determine the genetic characteristics of cells or tissues. In cancer, molecular characterization may provide information about the presence of certain biomarkers or genetic changes in tumor tissue, such as gene mutations, patterns of gene expression, and other changes in tumor DNA or RNA. Molecular characterization can play an important role in how diseases, such as cancer, are diagnosed and treated and how they respond to treatment. Genomic sequencing, molecular profiling, and liquid biopsy are all types of molecular characterization.
  molecular diagnosis: (muh-LEH-kyoo-ler dy-ug-NOH-sis)
    Pronunciation of dictionary term "molecular diagnosis"
    The process of identifying a disease by studying molecules, such as proteins, DNA, and RNA, in a tissue or fluid.
  molecular diagnostics: (muh-LEH-kyoo-ler DY-ug-NAH-stiks)
    Pronunciation of dictionary term "molecular diagnostics"
    Laboratory methods that are used to help identify a disease or the risk of developing a disease, such as cancer, by studying molecules, such as DNA, RNA, and proteins, in a tissue or fluid sample. Molecular diagnostics may also be used to help plan treatment for a disease, look for recurrence of disease, or find out how well treatment is working. There are many types of molecular diagnostic tests, such as biomarker tests, genetic tests, tumor sequencing tests, and liquid biopsies.
  molecular marker: (muh-LEH-kyoo-ler MAR-ker)
    Pronunciation of dictionary term "molecular marker"
    A biological molecule found in blood, other body fluids, or tissues that is a sign of a normal or abnormal process, or of a condition or disease. A molecular marker may be used to see how well the body responds to a treatment for a disease or condition. Also called biomarker and signature molecule.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  molecular mass: (muh-LEH-kyoo-ler mas)
    Pronunciation of dictionary term "molecular mass"
    The sum of the atomic masses of all atoms in a molecule, based on a scale in which the atomic masses of hydrogen, carbon, nitrogen, and oxygen are 1, 12, 14, and 16, respectively. For example, the molecular mass of water, which has two atoms of hydrogen and one atom of oxygen, is 18 (i.e., 2 + 16). Also called molecular weight.
  molecular medicine: (muh-LEH-kyoo-ler MEH-dih-sin)
    Pronunciation of dictionary term "molecular medicine"
    A branch of medicine that develops ways to diagnose and treat disease by understanding the way genes, proteins, and other cellular molecules work. Molecular medicine is based on research that shows how certain genes, molecules, and cellular functions may become abnormal in diseases such as cancer.
  molecular pathway: (muh-LEH-kyoo-ler …)
    Pronunciation of dictionary term "molecular pathway"
    A series of actions among molecules in a cell that leads to a certain end point or cell function.
  molecular profiling: (muh-LEH-kyoo-ler PROH-fy-ling)
    Pronunciation of dictionary term "molecular profiling"
    A laboratory method that uses a sample of tissue, blood, or other body fluid to check for certain genes, proteins, or other molecules that may be a sign of a disease or condition, such as cancer. Molecular profiling can also be used to check for certain changes in a gene or chromosome that may increase a person’s risk of developing cancer or other diseases. Molecular profiling may be done with other procedures, such as biopsies, to help diagnose some types of cancer. It may also be used to help plan treatment, find out how well treatment is working, make a prognosis, or predict whether cancer will come back or spread to other parts of the body. Also called biomarker testing and molecular testing.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  molecular radiation therapy: (muh-LEH-kyoo-ler RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "molecular radiation therapy"
    A type of radiation therapy in which a radionuclide (a radioactive chemical) is linked to a cell-targeting molecule, such as a monoclonal antibody, and injected into the body. The cell-targeting molecule binds to a specific target found on some cancer cells. This may help kill the targeted cancer cells while limiting the harm to normal cells. Molecular radiation therapy is used to treat prostate cancer and some other types of cancer. Also called targeted radionuclide therapy.
  molecular risk assessment: (muh-LEH-kyoo-ler risk uh-SES-ment)
    Pronunciation of dictionary term "molecular risk assessment"
    A procedure in which biomarkers (for example, biological molecules or changes in tumor cell DNA) are used to estimate a person’s risk for developing cancer. Specific biomarkers may be linked to particular types of cancer.
  molecular subtype: (muh-LEH-kyoo-ler SUB-tipe)
    Pronunciation of dictionary term "molecular subtype"
    In cancer, a term used to describe the smaller groups that a type of cancer can be divided into, based on whether certain genetic changes or other biomarkers are present. For example, breast cancer can be broken down into several molecular subtypes based on whether the cancer cells have estrogen receptors (ER), progesterone receptors (PR), or HER2 on their surface. Knowing the molecular subtype of a cancer may help plan treatment, find out how well treatment is working, or make a prognosis.
  molecular target: (muh-LEH-kyoo-ler TAR-get)
    Pronunciation of dictionary term "molecular target"
    In cancer, a term used to describe certain genes, proteins, and other molecules that are involved in the growth, spread, and survival of cancer cells and may be used as targets for cancer treatment. Treatments that block molecular targets or the signals they send may kill cancer cells or keep cancer cells from growing or spreading.
    More Information
    - Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
  molecular testing: (muh-LEH-kyoo-ler TES-ting)
    Pronunciation of dictionary term "molecular testing"
    A laboratory method that uses a sample of tissue, blood, or other body fluid to check for certain genes, proteins, or other molecules that may be a sign of a disease or condition, such as cancer. Molecular testing can also be used to check for certain changes in a gene or chromosome that may increase a person’s risk of developing cancer or other diseases. Molecular testing may be done with other procedures, such as biopsies, to help diagnose some types of cancer. It may also be used to help plan treatment, find out how well treatment is working, make a prognosis, or predict whether cancer will come back or spread to other parts of the body. Also called biomarker testing and molecular profiling.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  molecular weight: (muh-LEH-kyoo-ler wayt)
    Pronunciation of dictionary term "molecular weight"
    The sum of the atomic masses of all atoms in a molecule, based on a scale in which the atomic masses of hydrogen, carbon, nitrogen, and oxygen are 1, 12, 14, and 16, respectively. For example, the molecular weight of water, which has two atoms of hydrogen and one atom of oxygen, is 18 (i.e., 2 + 16). Also called molecular mass.
  molecularly targeted therapy: (muh-LEH-kyoo-ler-lee TAR-geh-ted THAYR-uh-pee)
    Pronunciation of dictionary term "molecularly targeted therapy"
    A type of treatment that uses drugs or other substances to target specific molecules that cancer cells need to survive and spread. Molecularly targeted therapies work in different ways to treat cancer. Some stop cancer cells from growing by interrupting signals that cause them to grow and divide, stopping signals that help form blood vessels, delivering cell-killing substances to cancer cells, or starving cancer cells of hormones they need to grow. Other molecularly targeted therapies help the immune system kill cancer cells or directly cause cancer cell death. Most molecularly targeted therapies are either small-molecule drugs or monoclonal antibodies. Also called targeted therapy.
    More Information
    - Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
  molecule: (MAH-leh-kyool)
    Pronunciation of dictionary term "molecule"
    The smallest particle of a substance that has all of the physical and chemical properties of that substance. Molecules are made up of one or more atoms. If they contain more than one atom, the atoms can be the same (an oxygen molecule has two oxygen atoms) or different (a water molecule has two hydrogen atoms and one oxygen atom). Biological molecules, such as proteins and DNA, can be made up of many thousands of atoms.
  momelotinib dihydrochloride monohydrate: (MOH-meh-LOH-tih-nib dy-HY-droh-KLOR-ide MAH-noh-HY-drayt)
    Pronunciation of dictionary term "momelotinib dihydrochloride monohydrate"
    A drug used to treat intermediate-risk or high-risk myelofibrosis (MF), including primary MF, post-polycythemia vera MF, and post-essential thrombocythemia MF, in adults with anemia. Momelotinib dihydrochloride monohydrate blocks JAK and other proteins, which may help keep abnormal blood cells or cancer cells from growing. It is a type of kinase inhibitor. Also called Ojjaara.
    More Information
    - Momelotinib Dihydrochloride Monohydrate (https://www.cancer.gov/about-cancer/treatment/drugs/momelotinib-dihydrochloride-monohydrate)
  mometasone: (moh-MEH-tuh-sone)
    Pronunciation of dictionary term "mometasone"
    A drug that is used in a cream to treat certain skin conditions and in a nasal spray to treat sinus problems caused by allergies. It is being studied as a way to treat inflammation of the skin caused by radiation therapy. Mometasone is a type of corticosteroid. Also called Elocon, mometasone furoate, and Nasonex.
  mometasone furoate: (moh-MEH-tuh-sone FYOOR-oh-ayt)
    Pronunciation of dictionary term "mometasone furoate"
    A drug that is used in a cream to treat certain skin conditions and in a nasal spray to treat sinus problems caused by allergies. It is being studied as a way to treat inflammation of the skin caused by radiation therapy. Mometasone furoate is a type of corticosteroid. Also called Elocon and Nasonex.
  monitor: (MAH-nih-ter)
    Pronunciation of dictionary term "monitor"
    In medicine, to regularly watch and check a person or condition to see if there is any change. Also refers to a device that records and/or displays patient data, such as for an electrocardiogram (EKG).
  Monjuvi: (mon-JOO-vee)
    Pronunciation of dictionary term "Monjuvi"
    A drug used with lenalidomide to treat adults with certain types of diffuse large B-cell lymphoma that relapsed (came back) or did not get better after treatment with other anticancer therapy. It is used in patients who cannot be treated with an autologous stem cell transplant. It is also being studied in the treatment of other types of cancer. Monjuvi binds to a protein called CD19, which is found on most B cells (a type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Monjuvi is a type of monoclonal antibody. Also called tafasitamab.
    More Information
    - Tafasitamab-cxix (https://www.cancer.gov/about-cancer/treatment/drugs/tafasitamab-cxix)
  monk’s pepper: (munks PEH-per)
    Pronunciation of dictionary term "monk’s pepper"
    An extract made from the fruit of the chaste tree (Vitex agnus-castus) found in parts of Asia and Europe. It is claimed to treat infertility and to lessen symptoms that may occur before or during a woman’s menstrual period, such as headaches and irregular bleeding. Monk’s pepper may affect levels of reproductive hormones in the blood. It is a type of phytomedicine. Also called chaste tree berry and Vitex.
  monoamine oxidase inhibitor: (MAH-noh-uh-MEEN OK-sih-days in-HIH-bih-ter)
    Pronunciation of dictionary term "monoamine oxidase inhibitor"
    A type of drug used to treat depression. It stops the breakdown of certain chemicals in the brain that help improve a person’s mood. A monoamine oxidase inhibitor is a type of antidepressant. Also called MAO inhibitor.
  monoclonal antibody: (MAH-noh-KLOH-nul AN-tee-BAH-dee)
    Pronunciation of dictionary term "monoclonal antibody"
    A type of protein that is made in the laboratory and can bind to certain targets in the body, such as antigens on the surface of cancer cells. There are many kinds of monoclonal antibodies, and each monoclonal antibody is made so that it binds to only one antigen. Monoclonal antibodies are being used in the diagnosis and treatment of many diseases, including some types of cancer. They can be used alone or to carry drugs, toxins, or radioactive substances directly to cancer cells.
    More Information
    - Monoclonal Antibodies (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/monoclonal-antibodies)
    How Monoclonal Antibodies Treat Cancer
    How do monoclonal antibodies work to treat cancer? This video shows how monoclonal antibodies, such as trastuzumab, pembrolizumab, and rituximab, block molecules cancer cells need to grow, flag cancer cells for destruction by the body’s immune system, or deliver harmful substances to cancer cells.
    YouTube (https://www.youtube.com/watch?v=dxnjAc-rqz8)
  monoclonal antibody Ch14.18: (MAH-noh-KLOH-nul AN-tee-BAH-dee…)
    Pronunciation of dictionary term "monoclonal antibody Ch14.18"
    A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF), aldesleukin (IL-2), and 13-cis-retinoic acid to treat children with high-risk neuroblastoma. It is used in patients whose disease has gotten better with other anticancer treatment. Monoclonal antibody Ch14.18 binds to a substance called GD2, which is found on some types of cancer cells. Monoclonal antibody Ch14.18 may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Ch14.18, dinutuximab, MOAB Ch14.18, and Unituxin.
    More Information
    - Dinutuximab (https://www.cancer.gov/about-cancer/treatment/drugs/dinutuximab)
  monoclonal antibody HuM195: (MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "monoclonal antibody HuM195"
    A substance being studied in the treatment of myelodysplastic syndromes and some types of leukemia. It binds to CD33, a protein on the surface of certain normal blood stem cells and some abnormal blood cells. It causes the immune system to kill these cells. Monoclonal antibody HuM195 is a type of monoclonal antibody. Also called lintuzumab and MoAb HuM195.
  monoclonal B-cell lymphocytosis: (MAH-noh-KLOH-nul B-sel LIM-foh-sy-TOH-sis)
    Pronunciation of dictionary term "monoclonal B-cell lymphocytosis"
    A condition in which a higher-than-normal number of identical B cells are found in the blood. People with monoclonal B-cell lymphocytosis may develop other B-cell diseases, such as chronic lymphocytic leukemia (CLL). Also called MBL.
  monoclonal gammopathy of undetermined significance: (MAH-noh-KLOH-nul ga-MAH-puh-thee ... UN-deh-TER-mind sig-NIH-fih-kunts)
    Pronunciation of dictionary term "monoclonal gammopathy of undetermined significance"
    A benign condition in which there is a higher-than-normal level of a protein called M protein in the blood. Patients with monoclonal gammopathy of undetermined significance are at an increased risk of developing cancer. Also called MGUS.
  monoclonal protein: (MAH-noh-KLOH-nul PROH-teen)
    Pronunciation of dictionary term "monoclonal protein"
    An antibody found in unusually large amounts in the blood or urine of people with multiple myeloma and other types of plasma cell tumors. Also called M protein.
  monocyte: (MAH-noh-site)
    Pronunciation of dictionary term "monocyte"
    A type of immune cell that is made in the bone marrow and travels through the blood to tissues in the body where it becomes a macrophage or a dendritic cell. Macrophages surround and kill microorganisms, ingest foreign material, remove dead cells, and boost immune responses. During inflammation, dendritic cells boost immune responses by showing antigens on their surface to other cells of the immune system. A monocyte is a type of white blood cell and a type of phagocyte.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  monogamous: (muh-NAH-guh-mus)
    Pronunciation of dictionary term "monogamous"
    A term used to describe a type of personal relationship in which a person has only one partner at a time.
  monomer: (MAH-noh-mer)
    Pronunciation of dictionary term "monomer"
    A molecule that can join with other identical monomers to form a larger structure called a polymer.
  monotherapy: (MAH-noh-THAYR-uh-pee)
    Pronunciation of dictionary term "monotherapy"
    Therapy that uses one type of treatment, such as radiation therapy or surgery alone, to treat a certain disease or condition. In drug therapy, monotherapy refers to the use of a single drug to treat a disease or condition.
  Montanide ISA-51: (MON-tuh-nide ...)
    Pronunciation of dictionary term "Montanide ISA-51"
    A mixture of oil and water that is combined with a specific antigen to boost the immune response to that antigen. It is being studied in immunotherapy and as a way to increase the immune response to cancer vaccines. It is a type of immune modulator. Also called IFA and incomplete Freund's adjuvant.
  montelukast: (mon-teh-LOO-kast)
    Pronunciation of dictionary term "montelukast"
    The active ingredient in a drug used to treat symptoms of asthma, such as trouble breathing, tight chest, wheezing, coughing, and runny nose. Montelukast blocks the action of a substance that causes airways in the lungs to narrow and causes other symptoms of asthma. It is a type of leukotriene receptor antagonist and a type of antiasthmatic agent.
  montelukast sodium: (mon-teh-LOO-kast SOH-dee-um)
    Pronunciation of dictionary term "montelukast sodium"
    A drug used to treat symptoms of asthma, such as trouble breathing, tight chest, wheezing, coughing, and runny nose. Montelukast sodium blocks the action of a substance that causes airways in the lungs to narrow and causes other symptoms of asthma. It is a type of leukotriene receptor antagonist and a type of antiasthmatic agent. Also called Singulair.
  MOPP: An abbreviation for a chemotherapy combination used alone or with radiation therapy to treat Hodgkin lymphoma. It includes the drugs mechlorethamine hydrochloride, vincristine sulfate (Oncovin), procarbazine hydrochloride, and prednisone. Also called MOPP regimen.
    More Information
    - MOPP (https://www.cancer.gov/about-cancer/treatment/drugs/MOPP)
  MOPP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "MOPP regimen"
    An abbreviation for a chemotherapy combination used alone or with radiation therapy to treat Hodgkin lymphoma. It includes the drugs mechlorethamine hydrochloride, vincristine sulfate (Oncovin), procarbazine hydrochloride, and prednisone. Also called MOPP.
    More Information
    - MOPP (https://www.cancer.gov/about-cancer/treatment/drugs/MOPP)
  MORAb-009: A substance being studied in the treatment of mesothelioma. MORAb-009 binds to a protein called mesothelin, which is found on some cancer cells. MORAb-009 may help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called amatuximab and anti-mesothelin monoclonal antibody MORAb-009.
  moral: (MOR-ul)
    Pronunciation of dictionary term "moral"
    Having to do with beliefs about what is right and wrong in terms of how people behave. Also called ethical.
  morbidity: (mor-BIH-dih-tee)
    Pronunciation of dictionary term "morbidity"
    Refers to having a disease or a symptom of disease, or to the amount of disease within a population. Morbidity also refers to medical problems caused by a treatment.
  Morinda citrifolia: (moh-RIN-duh sih-trih-FOH-lee-uh)
    Pronunciation of dictionary term "Morinda citrifolia"
    A tropical shrub. An extract from the fruit is being studied as a treatment for cancer, and extracts from the fruit, leaves, or roots have been used in some cultures to treat other diseases. Also called noni.
  morphine sulfate: (MOR-feen SUL-fayt)
    Pronunciation of dictionary term "morphine sulfate"
    A drug used to treat moderate to severe pain. It is made from a natural substance found in the seed pods of the opium poppy plant. Morphine sulfate works by binding to opioid receptors, such as the mu opioid receptor, in the central nervous system and other tissues. This blocks pain signals and changes how the body responds to pain. It is a type of opiate and a type of analgesic (pain reliever).
    More Information
    - Cancer Pain
  morphology: (mor-FAH-loh-jee)
    Pronunciation of dictionary term "morphology"
    The science of the form and structure of organisms (plants, animals, and other forms of life).
  mortality: (mor-TA-lih-tee)
    Pronunciation of dictionary term "mortality"
    Refers to the state of being mortal (destined to die). In medicine, a term also used for death rate, or the number of deaths in a certain group of people in a certain period of time. Mortality may be reported for people who have a certain disease, live in one area of the country, or who are of a certain gender, age, or ethnic group.
  mosaic Down syndrome: (moh-ZAY-ik … SIN-drome)
    Pronunciation of dictionary term "mosaic Down syndrome"
    A form of Down syndrome caused by having an extra chromosome 21 in some of the body’s cells. Cells with an extra chromosome 21 have three copies of it, while the other cells have two copies. Down syndrome is a genetic condition marked by certain physical features, delays (growth, development, and learning), and other health problems. People with mosaic Down syndrome can have the same physical features and health and learning problems as those who have other types of Down syndrome, but how mosaic Down syndrome presents can vary depending on how many cells have the extra chromosome.
  mosaicism: (moh-ZAY-ih-SIH-zum)
    Pronunciation of dictionary term "mosaicism"
    A condition in which some cells or tissues in a person’s body have a different genetic or chromosomal makeup than those in the rest of the body. Mosaicism is caused by a genetic change that occurs during cell division. This can happen during embryo development or after birth. Mosaicism can affect a large number of cells or only a few cells. It may or may not cause disease.
    More Information
    - Mosaicism (MedlinePlus) (https://medlineplus.gov/ency/article/001317.htm)
  mosunetuzumab: (moh-SUN-eh-TOO-zoo-mab)
    Pronunciation of dictionary term "mosunetuzumab"
    A drug used to treat adults with follicular lymphoma that came back or did not get better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Mosunetuzumab binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called CD20, which is found on B cells (another type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Mosunetuzumab is a type of bispecific monoclonal antibody. Also called Lunsumio.
    More Information
    - Mosunetuzumab-axgb (https://www.cancer.gov/about-cancer/treatment/drugs/mosunetuzumab-axgb)
  motexafin gadolinium: (moh-TEK-suh-fin GA-doh-LIH-nee-um)
    Pronunciation of dictionary term "motexafin gadolinium"
    A substance being studied in the treatment and diagnosis of some types of cancer. It builds up in some cancer cells, which may make them easier to kill with radiation therapy and chemotherapy. Motexafin gadolinium is also used in magnetic resonance imaging (MRI) to help find cancer cells in the body. It is a type of radiosensitizing agent, a type of chemosensitizing agent, and a type of contrast agent. Also called gadolinium texaphyrin.
  motexafin lutetium: (moh-TEK-suh-fin loo-TEE-shee-um)
    Pronunciation of dictionary term "motexafin lutetium"
    A substance that is being studied in the treatment of cancer using photodynamic therapy. It belongs to the family of drugs called metallotexaphyrins. Also called lutetium texaphyrin.
  motor: (MOH-ter)
    Pronunciation of dictionary term "motor"
    In medicine, having to do with the movement of body parts.
  motor neuron disease: (MOH-ter NOOR-on dih-ZEEZ)
    Pronunciation of dictionary term "motor neuron disease"
    A type of disease in which the nerve cells in the brain that act on muscle cells break down and stop working. This affects basic activities such as speaking, walking, breathing, and swallowing. Symptoms include muscle weakness, wasting, twitching, trouble swallowing, and slowly becoming paralyzed. Motor neuron diseases are sometimes inherited. Amyotrophic lateral sclerosis (ALS or Lou Gehrig’s disease) is the most common type of motor neuron disease.
  Motrin: (MOH-trin)
    Pronunciation of dictionary term "Motrin"
    A drug used to treat fever, swelling, pain, and redness by preventing the body from making a substance that causes inflammation. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called Advil and ibuprofen.
  mouse model: (... MAH-dul)
    Pronunciation of dictionary term "mouse model"
    The use of special strains of mice to study a human disease or condition, and how to prevent and treat it.
  moxetumomab pasudotox: (MOK-see-TOO-moh-mab pah-SOO-doh-tox)
    Pronunciation of dictionary term "moxetumomab pasudotox"
    A drug used to treat adults with hairy cell leukemia that came back or did not get better with at least two other systemic therapies, including treatment with a purine nucleoside analog (a type of anticancer drug). Moxetumomab pasudotox contains a monoclonal antibody that binds to a protein called CD22, which is found on B cells (a type of white blood cell) and some types of leukemia cells. It also contains a bacterial toxin called PE38, which may help kill cancer cells. Moxetumomab pasudotox is a type of immunotoxin. Also called anti-CD22 immunotoxin CAT-8015, CAT-8015, and Lumoxiti.
    More Information
    - Moxetumomab Pasudotox-tdfk
  moxibustion: (MOK-sih-BUS-chun)
    Pronunciation of dictionary term "moxibustion"
    In traditional Chinese medicine, a type of heat therapy in which an herb is burned on or above the skin to warm and stimulate an acupuncture point or affected area.
  moxifloxacin: (MOK-sih-FLOK-suh-sin)
    Pronunciation of dictionary term "moxifloxacin"
    A drug used to treat bacterial infections. It is a type of fluoroquinolone. Also called Avelox and moxifloxacin hydrochloride.
  moxifloxacin hydrochloride: (MOK-sih-FLOK-suh-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "moxifloxacin hydrochloride"
    A drug used to treat bacterial infections. It is a type of fluoroquinolone. Also called Avelox.
  Mozobil: (MOH-zoh-bil)
    Pronunciation of dictionary term "Mozobil"
    A drug used with granulocyte colony-stimulating factor before an autologous stem cell transplant in patients with non-Hodgkin lymphoma or multiple myeloma. It is also being studied in the treatment of other types of cancer. Mozobil helps move stem cells from the bone marrow to the blood so they can be collected, stored, and then given back to the patient. Mozobil is a type of hematopoietic stem cell mobilizer. Also called AMD 3100 and plerixafor.
    More Information
    - Plerixafor (https://www.cancer.gov/about-cancer/treatment/drugs/plerixafor)
  MP470: A substance being studied in the treatment of some types of cancer. It may block certain proteins involved in cancer cell growth and DNA repair. Blocking these proteins may make cancer cells more sensitive to anticancer drugs and radiation therapy. MP470 is a type of tyrosine kinase inhibitor. Also called amuvatinib.
  MPL gene: (… jeen)
    Pronunciation of dictionary term "MPL gene"
    A gene that makes a protein that helps control the number of blood cells that are made in the bone marrow, especially platelets. Mutated (changed) forms of the MPL gene may cause the body to make abnormal blood cells or too many platelets. Mutations in this gene have been found in some types of blood conditions, including essential thrombocythemia and primary myelofibrosis.
  MPNST: A type of soft tissue sarcoma that develops in cells that form a protective sheath (covering) around peripheral nerves, which are nerves that are outside of the central nervous system (brain and spinal cord). Also called malignant peripheral nerve sheath tumor.
  MR: A measure of how fast cancer cells are dividing and growing. To find the MR, the number of cells dividing in a certain amount of cancer tissue is counted. MR is used to help find the stage of melanoma (a type of skin cancer) and other types of cancer. Higher MRs are linked with lower survival rates. Also called mitotic rate.
  MRA: A procedure that uses radio waves and a powerful magnet linked to a computer to create detailed pictures of the blood vessels and blood flow inside the body. A dye may be injected into a vein to make the blood vessels and blood flow easier to see. MRA may be used to check for aneurysms (a bulge in the blood vessel wall), blockages in the arteries, blood clots, and other blood vessel problems. Also called magnetic resonance angiography.
  MRCP: A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of the liver, bile ducts, gallbladder, pancreas, and pancreatic duct. A dye may be injected into the body to make the ducts and organs easier to see. MRCP may be used to help diagnose certain conditions, such as gallstones, inflammation of the pancreas or gallbladder, and bile duct or pancreatic duct problems. It may also be used to help diagnose certain types of cancer, such as bile duct cancer (cholangiocarcinoma) and pancreatic cancer. MRCP is a type of magnetic resonance imaging (MRI). Also called magnetic resonance cholangiopancreatography.
  MRD: A term used to describe a very small number of cancer cells that remain in the body during or after treatment. MRD can be found only by highly sensitive laboratory methods that are able to find one cancer cell among one million normal cells. Checking to see if there is MRD may help plan treatment, find out how well treatment is working or if cancer has come back, or make a prognosis. MRD testing is used mostly for blood cancers such as lymphoma and leukemia. Also called measurable residual disease and minimal residual disease.
  MRI: A procedure that uses radio waves, a powerful magnet, and a computer to make a series of detailed pictures of areas inside the body. A contrast agent, such as gadolinium, may be injected into a vein to help the tissues and organs show up more clearly in the picture. MRI may be used to help diagnose disease, plan treatment, or find out how well treatment is working. It is especially useful for imaging the brain and spinal cord, the heart and blood vessels, the bones, joints, and other soft tissues, the organs in the pelvis and abdomen, and the breast. Also called magnetic resonance imaging, NMRI, and nuclear magnetic resonance imaging.
    Magnetic resonance imaging (MRI) of the abdomen. The patient lies on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    Magnetic resonance imaging (MRI) of the abdomen; drawing shows the patient on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    An MRI of the breast is a procedure that uses radio waves, a strong magnet, and a computer to create detailed pictures of the inside of the breast. A contrast dye may be injected into a vein (not shown) to make the breast tissues easier to see on the MRI pictures. An MRI may be used with other breast imaging tests to detect breast cancer or other abnormal changes in the breast. It may also be used to screen for breast cancer in some people who have a high risk of the disease. Note: The inset shows an MRI image of the insides of both breasts. Credit for inset: The Cancer Imaging Archive (TCIA).
    MRI of the breast; drawing shows a person lying face down on a narrow, padded table with their arms above their head. The person’s breasts hang down into an opening in the table. The table slides into the MRI machine, which takes detailed pictures of the inside of the breast. An inset shows an MRI image of the insides of both breasts.
  MRI ultrasound fusion-guided biopsy: (… UL-truh-sownd FYOO-zhun GY-ded BY-op-see)
    Pronunciation of dictionary term "MRI ultrasound fusion-guided biopsy"
    A biopsy procedure that combines the pictures from an MRI scan and an ultrasound to create a detailed 3-D image of the prostate. This procedure makes it easier to see an abnormal area of tissue in order to guide the biopsy needle into the abnormal area. A sample of tissue can then be removed and checked under a microscope for signs of cancer. An MRI ultrasound fusion-guided biopsy may help find prostate cancer cells that may be missed with other types of biopsies. It may help find cancer at an early stage and plan cancer treatment. Also called fusion biopsy.
  MRI-guided biopsy: (… GY-ded BY-op-see)
    Pronunciation of dictionary term "MRI-guided biopsy"
    A procedure that uses an MRI scan to find an abnormal area in the breast or prostate to guide the removal of a tissue sample from that area with a needle. The tissue sample is then checked under a microscope for signs of disease, such as cancer. An MRI-guided biopsy may be done when a lump or mass cannot be felt or when the abnormal area cannot be seen on other imaging tests.
  MRL: A procedure that uses radio waves, a powerful magnet, and a computer to make a series of detailed pictures of the lymphatic system. A dye is injected into the body to make the lymphatic vessels and lymph nodes easier to see. MRL may be used to check for blockages or leaks in the lymphatic system and to help diagnose certain conditions, such as lymphedema or lymphoma, or find out whether cancer has spread. It may also be used to help plan treatment or find out how well treatment is working. MRL is sometimes used before surgery to learn more about the structure of a person's lymphatic system. Also called magnetic resonance lymphangiography.
  mRNA: A type of RNA found in cells. mRNA molecules carry the genetic information needed to make proteins. They carry the information from the DNA in the nucleus of the cell to the cytoplasm where the proteins are made. Also called messenger RNA.
  MRSA: A type of bacteria that causes an infection that does not respond to common antibiotics, including methicillin, amoxicillin, and penicillin. Most MRSA infections occur on the skin and are mild. However, they can also be serious or life threatening and difficult to treat. MRSA infections usually occur in people with weakened immune systems who are in hospitals, nursing homes, or other health care centers. They can also occur in healthy people who have skin-to-skin contact with others, such as childcare workers, team athletes, and people who live in crowded conditions. Also called methicillin-resistant Staphylococcus aureus.
  MRSI: A noninvasive imaging method that provides information about cellular activity (metabolic information). It is used along with magnetic resonance imaging (MRI) which provides information about the shape and size of the tumor (spatial information). Also called 1H-nuclear magnetic resonance spectroscopic imaging, magnetic resonance spectroscopic imaging, and proton magnetic resonance spectroscopic imaging.
  MS 209: A substance that is being studied for its ability to make cancer cells respond better to chemotherapy drugs to which they have become resistant. It is a type of quinolone antibiotic.
  MS-275: A substance that is being studied in the treatment of cancers of the blood. It belongs to the family of drugs called histone deacetylase inhibitors.
  MSH2 gene: (... jeen)
    Pronunciation of dictionary term "MSH2 gene"
    A gene that makes a protein involved in repairing DNA errors that can occur when DNA is copied in a cell. Mutations (changes) in the MSH2 gene may cause unrepaired errors in DNA to build up in the cell, which may lead to abnormal cell growth and cancer. MSH2 gene mutations have been found in the inherited conditions Lynch syndrome and Muir-Torre syndrome. People with these conditions have an increased risk of developing colorectal cancer and other types of cancer. The MSH2 gene is a type of DNA mismatch repair (MMR) gene.
    More Information
    - MSH2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/msh2)
  MSH6 gene: (... jeen)
    Pronunciation of dictionary term "MSH6 gene"
    A gene that makes a protein involved in repairing DNA errors that can occur when DNA is copied in a cell. Mutations (changes) in the MSH6 gene may cause unrepaired errors in DNA to build up in the cell, which may lead to abnormal cell growth and cancer. MSH6 gene mutations have been found in the inherited conditions Lynch syndrome and Muir-Torre syndrome. People with these conditions have an increased risk of developing colorectal cancer and other types of cancer. The MLH6 gene is a type of DNA mismatch repair (MMR) gene.
    More Information
    - MSH6 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/msh6)
  MSI: A change that occurs in certain cells (such as cancer cells) in which the number of repeated DNA bases in a microsatellite (a short, repeated sequence of DNA) is different from what it was when the microsatellite was inherited. MSI may be caused by mistakes that don’t get corrected when DNA is copied in a cell. It is found most often in colorectal cancer, gastric cancer, and endometrial cancer, but it may also be found in many other types of cancer. Knowing whether a cancer has MSI may help plan the best treatment. Also called microsatellite instability.
  MSI-H cancer: (… KAN-ser)
    Pronunciation of dictionary term "MSI-H cancer"
    Describes cancer cells that have a high number of mutations (changes) within microsatellites. For example, microsatellite testing that shows mutations in 30% or more microsatellites is called microsatellite instability-high. Microsatellites are short, repeated sequences of DNA. MSI-H cancer cells may have a defect in the ability to correct mistakes that occur when DNA is copied in the cell. Microsatellite instability is found most often in colorectal cancer, gastric cancer, and endometrial cancer, but it may also be found in many other types of cancer. Knowing whether cancer is microsatellite instability-high may help plan the best treatment. Also called microsatellite instability-high cancer.
  MSSE: A rare, inherited disorder in which many fast-growing tumors that look like squamous cell skin cancer form on the nose, face, ears, arms, and legs. The tumors usually go away on their own, but often leave deep, pitted scars in the skin. The tumors on the arms and legs are often larger and leave flat scars. MSSE is caused by mutations (changes) in the TGFBR1 gene. Also called Ferguson-Smith syndrome and multiple self-healing squamous epithelioma.
  MTD: The highest dose of a drug or treatment that does not cause unacceptable side effects. The MTD is determined in clinical trials by testing increasing doses on different groups of people until the highest dose with acceptable side effects is found. Also called maximum tolerated dose.
  mTOR: A protein that helps control several cell functions, including cell division and survival, and binds to rapamycin and other drugs. mTOR may be more active in some types of cancer cells than it is in normal cells. Blocking mTOR may cause the cancer cells to die. It is a type of serine/threonine protein kinase. Also called mammalian target of rapamycin and mechanistic target of rapamycin.
  mTOR inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "mTOR inhibitor"
    A substance that blocks a protein called mTOR, which helps control cell division. Blocking mTOR’s action may keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. Some mTOR inhibitors are used to treat cancer.
  MTS: A rare, inherited disorder that causes tumors to form in the oil glands in skin and in at least one internal organ. The skin tumors may be benign (not cancer) or malignant (cancer) and usually occur on the face, scalp, and eyelids. The internal tumors are malignant and usually form in the gastrointestinal tract (especially the colon and rectum) or genitourinary tract (endometrium and bladder). MTS is caused by mutations (changes) in the MLH1, MSH2, or MSH6 gene. MTS is a type of Lynch syndrome. Also called Muir-Torre syndrome.
    More Information
    - Muir-Torre syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6821/muir-torre-syndrome)
  MTX: A drug used alone or with other drugs to treat many types of cancer, certain types of arthritis, and severe psoriasis (a type of skin condition). It is also being studied in the treatment of other conditions and types of cancer. MTX stops cells from using folic acid to make DNA and may kill cancer cells. It may also lower the body’s immune response. MTX is a type of antimetabolite and a type of antifolate. Also called methotrexate sodium, Trexall, and Xatmep.
    More Information
    - Methotrexate Sodium (Cancer Treatment) (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
  MUC-1: A protein found on certain epithelial cells, which line the inside and outside surfaces of the body. It may be found in higher than normal amounts in patients with some types of cancer, including breast, ovarian, lung, and prostate cancers, or in other conditions. Measuring the amount of MUC-1 in the blood may help to find out how well cancer treatment is working or if cancer has come back. MUC-1 is a type of tumor marker.
  mucin/peptide: (MYOO-sin/PEP-tide)
    Pronunciation of dictionary term "mucin/peptide"
    A protein/sugar compound made by some cancer cells.
  mucinous: (MYOO-sin-us)
    Pronunciation of dictionary term "mucinous"
    Containing or resembling mucin, the main compound in mucus.
  mucinous carcinoma: (MYOO-sin-us KAR-sih-NOH-muh)
    Pronunciation of dictionary term "mucinous carcinoma"
    A type of cancer that begins in cells that line certain internal organs and produce mucin (the main component of mucus).
  mucosa: (myoo-KOH-suh)
    Pronunciation of dictionary term "mucosa"
    The moist, inner lining of some organs and body cavities (such as the nose, mouth, lungs, and stomach). Glands in the mucosa make mucus (a thick, slippery fluid). Also called mucous membrane.
  mucosa-associated lymphoid tissue lymphoma: (myoo-KOH-suh-uh-SOH-see-ay-ted LIM-foyd TIH-shoo lim-FOH-muh)
    Pronunciation of dictionary term "mucosa-associated lymphoid tissue lymphoma"
    A type of cancer that arises in cells in mucosal tissue that are involved in antibody production. Also called MALT lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  mucosal HPV: (myoo-KOH-sul ...)
    Pronunciation of dictionary term "mucosal HPV"
    A group of human papillomaviruses (HPV) that can infect the cells on the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat. Mucosal HPVs can be grouped into high-risk HPV and low-risk HPV types. Low-risk HPV infections can cause warts on or around the genitals, anus, mouth, larynx, or other parts of the respiratory tract but rarely cause cancer. A long-lasting infection with a high-risk HPV type can cause cell changes that become cancer over time if not found and removed. HPV-related cancers include cancers of the cervix, anus, oropharynx, vagina, vulva, and penis. Mucosal HPV is transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. Also called mucosal human papillomavirus.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  mucosal human papillomavirus: (myoo-KOH-sul HYOO-mun PA-pih-LOH-muh-VY-rus)
    Pronunciation of dictionary term "mucosal human papillomavirus"
    A group of human papillomaviruses (HPV) that can infect the cells on the moist surfaces or inner lining of some organs and body cavities, such as the cervix, vagina, vulva, penis, anus, mouth, and throat. Mucosal human papillomaviruses can be grouped into high-risk HPV and low-risk HPV types. Low-risk HPV infections can cause warts on or around the genitals, anus, mouth, larynx, or other parts of the respiratory tract but rarely cause cancer. A long-lasting infection with a high-risk HPV type can cause cell changes that become cancer over time if not found and removed. HPV-related cancers include cancers of the cervix, anus, oropharynx, vagina, vulva, and penis. Mucosal human papillomavirus is transmitted through intimate skin-to-skin contact, most often during vaginal, anal, or oral sex. Also called mucosal HPV.
    More Information
    - HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  mucosal neuroma: (myoo-KOH-sul noor-OH-muh)
    Pronunciation of dictionary term "mucosal neuroma"
    A benign (not cancer) tumor that forms around the nerves in the lips, tongue, lining of the mouth, eyelids, and gastrointestinal tract. Mucosal neuromas are found in people with a rare, inherited condition called multiple endocrine neoplasia type 2B.
    Mucosal neuromas are benign tumors of nerve tissue that are a characteristic feature of multiple endocrine neoplasia type 2B (also known as MEN3), a hereditary syndrome associated with the development of medullary thyroid cancer.
    Photograph showing the tongue of an individual with multiple endocrine neoplasia type 2B. The tongue is covered with white irregularly shaped lesions.
    Mucosal neuromas are benign tumors of nerve tissue that are a characteristic feature of multiple endocrine neoplasia type 2B (also known as MEN3), a hereditary syndrome associated with the development of medullary thyroid cancer.
    Photograph showing the tongue of an individual with multiple endocrine neoplasia type 2B. The tongue is covered with white irregularly shaped lesions.
  mucositis: (myoo-koh-SY-tis)
    Pronunciation of dictionary term "mucositis"
    A complication of some cancer therapies in which the lining of the digestive system becomes inflamed. Often seen as sores in the mouth.
    More Information
    - Mouth and Throat Problems: Cancer Treatment Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
    - Oral Complications of Cancer Therapies
  mucous membrane: (MYOO-kus MEM-brayn)
    Pronunciation of dictionary term "mucous membrane"
    The moist, inner lining of some organs and body cavities (such as the nose, mouth, lungs, and stomach). Glands in the mucous membrane make mucus (a thick, slippery fluid). Also called mucosa.
  mucus: (MYOO-kus)
    Pronunciation of dictionary term "mucus"
    A thick, slippery fluid made by the membranes that line certain organs and body cavities, such as the nose, mouth, throat, lungs, stomach, and vagina.
  mucus colitis: (MYOO-kus koh-LY-tis)
    Pronunciation of dictionary term "mucus colitis"
    A disorder of the intestines commonly marked by abdominal pain, bloating, and changes in a person’s bowel habits. This may include diarrhea or constipation, or both, with one occurring after the other. Also called IBS, irritable bowel syndrome, irritable colon, and spastic colon.
  Muir-Torre syndrome: (myoor-TOR-ay SIN-drome)
    Pronunciation of dictionary term "Muir-Torre syndrome"
    A rare, inherited disorder that causes tumors to form in the oil glands in skin and in at least one internal organ. The skin tumors may be benign (not cancer) or malignant (cancer) and usually occur on the face, scalp, and eyelids. The internal tumors are malignant and usually form in the gastrointestinal tract (especially the colon and rectum) or genitourinary tract (endometrium and bladder). Muir-Torre syndrome is caused by mutations (changes) in the MLH1, MSH2, or MSH6 gene. Muir-Torre syndrome is a type of Lynch syndrome. Also called MTS.
    More Information
    - Muir-Torre syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6821/muir-torre-syndrome)
  muJ591: A type of monoclonal antibody used in cancer detection or therapy. Monoclonal antibodies are laboratory-produced substances that can locate and bind to cancer cells.
  Mullerian tumor: (myoo-LAYR-ee-un TOO-mer)
    Pronunciation of dictionary term "Mullerian tumor"
    A rare cancer of the uterus, ovary, or fallopian tubes.
  multi-cancer detection test: (MUL-tee-KAN-ser deh-TEK-shun …)
    Pronunciation of dictionary term "multi-cancer detection test"
    A type of blood test that is being studied as a way to screen for many types of cancer at the same time. Multi-cancer detection tests work by measuring biomarkers, such as pieces of DNA, that cancer cells release into the blood as they die. These tests may help find cancer in parts of the body that are not easily accessible for physical exam or biopsy. Multi-cancer detection tests may be used with other screening tests to help find more cancers before they cause symptoms. Multi-cancer detection tests are a type of liquid biopsy. These tests are sometimes called multi-cancer early detection tests or MCED tests. Also called MCD test.
    More Information
    - Questions and Answers about Multi-Cancer Detection Tests (https://prevention.cancer.gov/major-programs/cancer-screening-research-network-csrn/questions-and-answers-about-multi-cancer)
  multicenter study: (MUL-tee-SEN-ter STUH-dee)
    Pronunciation of dictionary term "multicenter study"
    A clinical trial that is carried out at more than one medical institution.
  multicentric breast cancer: (MUL-tee-SEN-trik brest KAN-ser)
    Pronunciation of dictionary term "multicentric breast cancer"
    Breast cancer in which there is more than one tumor, all of which have formed separately from one another. The tumors are likely to be in different quadrants (sections) of the breast. Multicentric breast cancers are rare.
  multidisciplinary: (MUL-tee-DIH-sih-plih-NAYR-ee)
    Pronunciation of dictionary term "multidisciplinary"
    In medicine, a term used to describe a treatment planning approach or team that includes a number of doctors and other health care professionals who are experts in different specialties (disciplines). In cancer treatment, the primary disciplines are medical oncology (treatment with drugs), surgical oncology (treatment with surgery), and radiation oncology (treatment with radiation).
  multidisciplinary opinion: (MUL-tee-DIH-sih-plih-NAYR-ee uh-PIN-yun)
    Pronunciation of dictionary term "multidisciplinary opinion"
    A treatment planning approach in which a number of doctors who are experts in different specialties (disciplines) review and discuss the medical condition and treatment options of a patient. In cancer treatment, a multidisciplinary opinion may include that of a medical oncologist (who provides cancer treatment with drugs), a surgical oncologist (who provides cancer treatment with surgery), and a radiation oncologist (who provides cancer treatment with radiation). Also called tumor board review.
  multidrug resistance: (MUL-tee-... reh-ZIH-stunts)
    Pronunciation of dictionary term "multidrug resistance"
    Adaptation of tumor cells to anticancer drugs in ways that make the drugs less effective.
  multidrug resistance inhibition: (MUL-tee-... reh-ZIH-stunts in-HIH-bih-shun)
    Pronunciation of dictionary term "multidrug resistance inhibition"
    Treatment used to make cancer cells less resistant to anticancer drugs.
  multifocal breast cancer: (mul-tee-FOH-kul brest KAN-ser)
    Pronunciation of dictionary term "multifocal breast cancer"
    Breast cancer in which there is more than one tumor, all of which have arisen from one original tumor. The tumors are likely to be in the same quadrant (section) of the breast.
  multigene panel test: (MUL-tee-jeen PA-nil ...)
    Pronunciation of dictionary term "multigene panel test"
    A laboratory test in which many genes are studied in a sample of tissue. Multigene panel tests help find mutations (changes) in certain genes that may increase a person’s risk of a disease such as cancer. They may also look at the activity of certain genes in a sample of tissue. Multigene panel tests may be used to help plan treatment or help predict whether cancer will spread to other parts of the body or come back. Also called MGPT and multigene test.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  multigene panel test: (MUL-tee-jeen PA-nil ...)
    A laboratory test in which many genes are studied in a sample of tissue. Multigene panel tests help find mutations (changes) in certain genes that may increase a person’s risk of a disease such as cancer. They may also look at the activity of certain genes in a sample of tissue. Multigene panel tests may be used to help plan treatment or help predict whether cancer will spread to other parts of the body or come back. Also called MGPT, multigene test, and panel test.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  multigene test: (MUL-tee-jeen ...)
    Pronunciation of dictionary term "multigene test"
    A laboratory test in which many genes are studied in a sample of tissue. Multigene tests help find mutations (changes) in certain genes that may increase a person’s risk of a disease such as cancer. They may also look at the activity of certain genes in a sample of tissue. Multigene tests may be used to help plan treatment or help predict whether cancer will spread to other parts of the body or come back. Also called MGPT and multigene panel test.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
    - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  MultiHance: (MUL-tee-HANTS)
    Pronunciation of dictionary term "MultiHance"
    A drug used in MRI to help make clear pictures of blood vessels in the brain, spine, and nearby tissues. It is also being studied as a way to find abnormal areas in the liver and other organs and to help diagnose cancer. MultiHance is a type of contrast agent. Also called gadobenate dimeglumine.
  multimodality therapy: (MUL-tee-moh-DA-lih-tee THAYR-uh-pee)
    Pronunciation of dictionary term "multimodality therapy"
    Therapy that combines more than one method of treatment. Also called combination therapy and multimodality treatment.
  multimodality treatment: (MUL-tee-moh-DA-lih-tee TREET-ment)
    Pronunciation of dictionary term "multimodality treatment"
    Therapy that combines more than one method of treatment. Also called combination therapy and multimodality therapy.
  multiple endocrine adenomatosis: (MUL-tih-pul EN-doh-krin A-deh-NOH-muh-TOH-sis)
    Pronunciation of dictionary term "multiple endocrine adenomatosis"
    A rare, inherited disorder that affects the endocrine glands and can cause tumors in the parathyroid and pituitary glands and the pancreas. These tumors are usually benign (not cancer). They cause the glands to secrete high levels of hormones, which can lead to other medical problems, such as kidney stones, fertility problems, and severe ulcers. In some cases, tumors inside the pancreas can become malignant (cancer). Also called MEN1 syndrome, multiple endocrine neoplasia type 1 syndrome, and Wermer syndrome.
    More Information
    - Multiple endocrine neoplasia type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3829/multiple-endocrine-neoplasia-type-1)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 1 (MEN1) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN1 syndrome usually causes pituitary gland, parathyroid gland, or pancreas tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN1 syndrome, including the pituitary gland, parathyroid glands, and pancreas. There is also an inset that shows the back view of the thyroid gland with the four pea-sized parathyroid glands.
  multiple endocrine adenomatosis type 2: (MUL-tih-pul EN-doh-krin A-deh-NOH-muh-TOH-sis ...)
    Pronunciation of dictionary term "multiple endocrine adenomatosis type 2"
    A rare, genetic disorder that affects the endocrine glands and can cause tumors in the thyroid gland, parathyroid glands, and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. Multiple endocrine adenomatosis type 2 is caused by a mutation (change) in a gene called RET, and is divided into three subtypes (MEN2A, MEN2B, and FMTC). People with all subtypes of multiple endocrine adenomatosis type 2 have an increased risk of medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. Also called MEN2, MEN2 syndrome, and multiple endocrine neoplasia type 2 syndrome.
    More Information
    - Multiple endocrine neoplasia type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3830/men2)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 2 (MEN2) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN2 syndrome usually causes thyroid gland, parathyroid gland, or adrenal gland tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN2 syndrome, including the thyroid gland, parathyroid glands, and adrenal gland. There are also two insets: one showing the back view of the thyroid gland with the four pea-sized parathyroid glands, and the other showing the inner part of the adrenal gland called the adrenal medulla.
  multiple endocrine adenomatosis type 2A: (MUL-tih-pul EN-doh-krin A-deh-NOH-muh-TOH-sis ...)
    Pronunciation of dictionary term "multiple endocrine adenomatosis type 2A"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the parathyroid glands and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. An itchy skin condition may also occur. Multiple endocrine adenomatosis type 2A is caused by a mutation (change) in a gene called RET. Also called MEN2A, MEN2A syndrome, multiple endocrine neoplasia type 2A syndrome, and Sipple syndrome.
    More Information
    - Multiple endocrine neoplasia type 2A (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4881/multiple-endocrine-neoplasia-type-2a)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  multiple endocrine adenomatosis type 2B: (MUL-tih-pul EN-doh-krin A-deh-NOH-muh-TOH-sis ...)
    Pronunciation of dictionary term "multiple endocrine adenomatosis type 2B"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the adrenal glands and growths around the nerves in the lips, tongue, lining of the mouth, and eyelids. Gastrointestinal symptoms and trouble with the spine or bones in the feet and thighs may also occur. Multiple endocrine adenomatosis type 2B is caused by a mutation (change) in a gene called RET. Also called MEN2B, MEN2B syndrome, and multiple endocrine neoplasia type 2B syndrome.
    More Information
    - Multiple endocrine neoplasia type 2B (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10225/multiple-endocrine-neoplasia-type-2b)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  multiple endocrine neoplasia syndrome: (MUL-tih-pul EN-doh-krin NEE-oh-PLAY-zhuh SIN-drome)
    Pronunciation of dictionary term "multiple endocrine neoplasia syndrome"
    An inherited condition that may result in the development of cancers of the endocrine system. There are several types of multiple endocrine neoplasia syndrome, and patients with each type may develop different types of cancer. The altered genes that cause each type can be detected with a blood test. Also called MEN syndrome.
    More Information
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 1 (MEN1) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN1 syndrome usually causes pituitary gland, parathyroid gland, or pancreas tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN1 syndrome, including the pituitary gland, parathyroid glands, and pancreas. There is also an inset that shows the back view of the thyroid gland with the four pea-sized parathyroid glands.
    Multiple endocrine neoplasia 2 (MEN2) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN2 syndrome usually causes thyroid gland, parathyroid gland, or adrenal gland tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN2 syndrome, including the thyroid gland, parathyroid glands, and adrenal gland. There are also two insets: one showing the back view of the thyroid gland with the four pea-sized parathyroid glands, and the other showing the inner part of the adrenal gland called the adrenal medulla.
  multiple endocrine neoplasia type 1 syndrome: (MUL-tih-pul EN-doh-krin NEE-oh-PLAY-zhuh ... SIN-drome)
    Pronunciation of dictionary term "multiple endocrine neoplasia type 1 syndrome"
    A rare, inherited disorder that affects the endocrine glands and can cause tumors in the parathyroid and pituitary glands and the pancreas. These tumors are usually benign (not cancer). They cause the glands to secrete high levels of hormones, which can lead to other medical problems, such as kidney stones, fertility problems, and severe ulcers. In some cases, tumors inside the pancreas can become malignant (cancer). Also called MEN1 syndrome, multiple endocrine adenomatosis, and Wermer syndrome.
    More Information
    - Multiple endocrine neoplasia type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3829/multiple-endocrine-neoplasia-type-1)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 1 (MEN1) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN1 syndrome usually causes pituitary gland, parathyroid gland, or pancreas tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN1 syndrome, including the pituitary gland, parathyroid glands, and pancreas. There is also an inset that shows the back view of the thyroid gland with the four pea-sized parathyroid glands.
  multiple endocrine neoplasia type 2 syndrome: (MUL-tih-pul EN-doh-krin NEE-oh-PLAY-zhuh ... SIN-drome)
    Pronunciation of dictionary term "multiple endocrine neoplasia type 2 syndrome"
    A rare, genetic disorder that affects the endocrine glands and can cause tumors in the thyroid gland, parathyroid glands, and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. Multiple endocrine neoplasia type 2 syndrome is caused by a mutation (change) in a gene called RET, and is divided into three subtypes (MEN2A, MEN2B, and FMTC). People with all subtypes of multiple endocrine neoplasia type 2 syndrome have an increased risk of medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. Also called MEN2, MEN2 syndrome, and multiple endocrine adenomatosis type 2.
    More Information
    - Multiple endocrine neoplasia type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3830/men2)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 2 (MEN2) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN2 syndrome usually causes thyroid gland, parathyroid gland, or adrenal gland tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN2 syndrome, including the thyroid gland, parathyroid glands, and adrenal gland. There are also two insets: one showing the back view of the thyroid gland with the four pea-sized parathyroid glands, and the other showing the inner part of the adrenal gland called the adrenal medulla.
  multiple endocrine neoplasia type 2A syndrome: (MUL-tih-pul EN-doh-krin NEE-oh-PLAY-zhuh ... SIN-drome)
    Pronunciation of dictionary term "multiple endocrine neoplasia type 2A syndrome"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the parathyroid glands and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. An itchy skin condition may also occur. Multiple endocrine neoplasia type 2A syndrome is caused by a mutation (change) in a gene called RET. Also called MEN2A, MEN2A syndrome, multiple endocrine adenomatosis type 2A, and Sipple syndrome.
    More Information
    - Multiple endocrine neoplasia type 2A (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4881/multiple-endocrine-neoplasia-type-2a)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  multiple endocrine neoplasia type 2B syndrome: (MUL-tih-pul EN-doh-krin NEE-oh-PLAY-zhuh ... SIN-drome)
    Pronunciation of dictionary term "multiple endocrine neoplasia type 2B syndrome"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the adrenal glands and growths around the nerves in the lips, tongue, lining of the mouth, and eyelids. Gastrointestinal symptoms and trouble with the spine or bones in the feet and thighs may also occur. Multiple endocrine neoplasia type 2B syndrome is caused by a mutation (change) in a gene called RET. Also called MEN2B, MEN2B syndrome, and multiple endocrine adenomatosis type 2B.
    More Information
    - Multiple endocrine neoplasia type 2B (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10225/multiple-endocrine-neoplasia-type-2b)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  multiple hamartoma syndrome: (MUL-tih-pul HA-mar-TOH-muh SIN-drome)
    Pronunciation of dictionary term "multiple hamartoma syndrome"
    A rare inherited disorder marked by the presence of many benign (not cancer) growths called hamartomas and an increased risk of cancer. Hamartomas form in different parts of the body, especially the skin, mouth, and gastrointestinal tract. Other benign tumors may also occur in the thyroid, breast, uterus, soft tissue, and brain. Other signs and symptoms include a larger-than-average head, abnormal skin changes, blood vessel problems, autism spectrum disorder, and learning and developmental delays. People with multiple hamartoma syndrome have an increased risk of developing certain types of cancer, including melanoma and cancers of the breast, thyroid, endometrium, kidney, colon, and rectum. Multiple hamartoma syndrome is usually caused by mutations (changes) in the PTEN gene. Also called Cowden disease and Cowden syndrome.
    More Information
    - Cowden syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6202/cowden-syndrome)
    - Cowden syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/cowden-syndrome/)
  multiple myeloma: (MUL-tih-pul MY-eh-LOH-muh)
    Pronunciation of dictionary term "multiple myeloma"
    A type of cancer that begins in plasma cells (white blood cells that produce antibodies). Also called Kahler disease, myelomatosis, and plasma cell myeloma.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
    Multiple myeloma. Multiple myeloma cells are abnormal plasma cells (a type of white blood cell) that build up in the bone marrow and form tumors in many bones of the body. Normal plasma cells make antibodies to help the body fight infection and disease. As the number of multiple myeloma cells increases, more antibodies are made. This can cause the blood to thicken and keep the bone marrow from making enough healthy blood cells. Multiple myeloma cells also damage and weaken the bone.
    Multiple myeloma; drawing shows normal plasma cells, multiple myeloma cells (abnormal plasma cells), and antibodies. Also shown is red marrow inside bone, where plasma cells are made.
  multiple sclerosis: (MUL-tih-pul skleh-ROH-sis)
    Pronunciation of dictionary term "multiple sclerosis"
    A disorder of the central nervous system marked by weakness, numbness, a loss of muscle coordination, and problems with vision, speech, and bladder control. Multiple sclerosis is thought to be an autoimmune disease in which the body's immune system destroys myelin. Myelin is a substance that contains both protein and fat (lipid), serving as a nerve insulator and helping in the transmission of nerve signals.
  multiple self-healing squamous epithelioma: (MUL-tih-pul … HEEL-ing SKWAY-mus EH-pih-THEE-lee-OH-muh)
    Pronunciation of dictionary term "multiple self-healing squamous epithelioma"
    A rare, inherited disorder in which many fast-growing tumors that look like squamous cell skin cancer form on the nose, face, ears, arms, and legs. The tumors usually go away on their own, but often leave deep, pitted scars in the skin. The tumors on the arms and legs are often larger and leave flat scars. Multiple self-healing squamous epithelioma is caused by mutations (changes) in the TGFBR1 gene. Also called Ferguson-Smith syndrome and MSSE.
  multiplicity: (MUL-tih-PLIH-sih-tee)
    Pronunciation of dictionary term "multiplicity"
    A large number or variety.
  multitargeted receptor tyrosine kinase inhibitor ABT-869: (MUL-tee-TAR-geh-ted reh-SEP-ter TY-ruh-seen KY-nays in-HIH-bih-ter …)
    Pronunciation of dictionary term "multitargeted receptor tyrosine kinase inhibitor ABT-869"
    A substance being studied in the treatment of several types of cancer. Multitargeted receptor tyrosine kinase inhibitor ABT-869 blocks the action of several growth factors. It may also block the growth of new blood vessels that tumors need to grow and may cause cancer cells to die. It is a type of receptor tyrosine kinase inhibitor and a type of angiogensis inhibitor. Also called ABT-869.
  mung bean: (mung been)
    Pronunciation of dictionary term "mung bean"
    A type of bean grown in warm climates, usually for its seed and for bean sprouts. Mung bean may have anticancer effects.
  muramyl tripeptide phosphatidylethanolamine: (MYOOR-uh-mil try-PEP-tide FOS-fuh-TY-dul-EH-thuh-NOH-luh-meen)
    Pronunciation of dictionary term "muramyl tripeptide phosphatidylethanolamine"
    A drug being studied in the treatment of young adults with bone cancer that has gotten worse or come back. Muramyl tripeptide phosphatidylethanolamine activates certain types of white blood cells and helps the immune system kill cancer cells. It is a type of immunostimulant. Also called L-MTP-PE, MEPACT, and mifamurtide.
  muromonab-CD3: (MYOO-roh-MOH-nab …)
    Pronunciation of dictionary term "muromonab-CD3"
    A type of monoclonal antibody used in cancer detection or therapy. Monoclonal antibodies are laboratory-produced substances that can locate and bind to cancer cells.
  muscle relaxant: (MUH-sul ree-LAK-sunt)
    Pronunciation of dictionary term "muscle relaxant"
    A type of drug that is used to relax the muscles and reduce tension, stiffness, and pain caused by muscle spasms or muscle spasticity (stiff, rigid muscles). Muscle relaxants are also used to prevent muscle movement during surgery. There are many different types of muscle relaxants. Some work by blocking certain nerve receptors in the brain or spinal cord, while others act directly on the muscle fibers in the body to relax the muscles.
  muscle wasting: (MUH-sul WAY-sting)
    Pronunciation of dictionary term "muscle wasting"
    A weakening, shrinking, and loss of muscle caused by disease or lack of use. Muscle wasting decreases strength and the ability to move.
  musculoskeletal: (MUS-kyoo-loh-SKEH-leh-tul)
    Pronunciation of dictionary term "musculoskeletal"
    Having to do with muscles, bones, tendons, ligaments, joints, and cartilage.
    More Information
    - Cancers by Body Location/System: Musculoskeletal (https://www.cancer.gov/types/by-body-location)
  MUSE: A method used to treat impotence (inability to have an erection). A suppository, in the form of a very small pellet, is inserted through the tip of the penis into the urethra. The suppository contains the drug alprostadil, which increases the flow of blood to the penis and causes an erection. Also called medicated urethral system for erection.
  music therapy: (MYOO-sik THAYR-uh-pee)
    Pronunciation of dictionary term "music therapy"
    A type of therapy that uses music to help improve a person’s overall health and well-being. It may include creating, singing, moving, listening, and/or relaxing to music. Music therapy may be used to help relieve stress, pain, anxiety, and depression caused by a disease, such as cancer, and its treatment. Music therapy is a type of complementary medicine.
  Mustargen: (MUS-ter-jen)
    Pronunciation of dictionary term "Mustargen"
    A drug used to treat non-Hodgkin lymphoma, advanced Hodgkin lymphoma, chronic leukemia, mycosis fungoides, and a type of lung cancer called bronchogenic carcinoma. It is also being studied in the treatment of other types of cancer. Mustargen damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent. Also called mechlorethamine hydrochloride and mustine.
    More Information
    - Mechlorethamine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/mechlorethaminehydrochloride)
  mustine: (MUS-teen)
    Pronunciation of dictionary term "mustine"
    A drug used on the skin to treat stage I mycosis fungoides (a type of cutaneous T-cell lymphoma) in patients who have already been treated with other therapy. It is also being studied in the treatment of other types of cancer. Mustine damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent. Also called mechlorethamine hydrochloride and Valchlor.
    More Information
    - Mechlorethamine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/mechlorethaminehydrochloride)
  mutagen: (MYOO-tuh-jen)
    Pronunciation of dictionary term "mutagen"
    Anything that causes a mutation (a change in the DNA of a cell). DNA changes caused by mutagens may harm cells and cause certain diseases, such as cancer. Examples of mutagens include radioactive substances, x-rays, ultraviolet radiation, and certain chemicals.
  Mutamycin: (MYOO-tuh-MY-sin)
    Pronunciation of dictionary term "Mutamycin"
    A drug used to treat advanced cancer of the stomach and pancreas that has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Mutamycin comes from bacteria. It damages the cell’s DNA and may kill cancer cells. It is a type of anticancer antibiotic. Also called mitomycin C and Mitozytrex.
  mutate: (MYOO-tayt)
    Pronunciation of dictionary term "mutate"
    To change the genetic material of a cell. The changes (mutations) can be harmful, beneficial, or have no effect.
  mutation: (myoo-TAY-shun)
    Pronunciation of dictionary term "mutation"
    Any change in the DNA sequence of a cell. Mutations may be caused by mistakes during cell division, or they may be caused by exposure to DNA-damaging agents in the environment. Mutations can be harmful, beneficial, or have no effect. If they occur in cells that make eggs or sperm, they can be inherited; if mutations occur in other types of cells, they are not inherited. Certain mutations may lead to cancer or other diseases. A mutation is sometimes called a variant.
    More Information
    - Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Mutation)
  mutation carrier: (myoo-TAY-shun KAYR-ee-er)
    Pronunciation of dictionary term "mutation carrier"
    A person who has a mutated (changed) copy of a gene. This change may cause a disease in that person or in his or her children.
  MUTYH-associated polyposis: (… uh-SOH-see-ay-ted PAH-lee-POH-sis)
    Pronunciation of dictionary term "MUTYH-associated polyposis"
    A rare, inherited disorder in which multiple polyps (abnormal growths) form on the inner walls of the colon and rectum. People with MUTYH-associated polyposis usually develop fewer than 100 colon polyps, and polyps may also occur in the stomach and small intestine. People with MUTYH-associated polyposis have a high risk of developing colorectal cancer. They may also be at increased risk of developing cancers of the stomach, small intestine, ovary, endometrium, bladder, liver, thyroid, and skin. MUTYH-associated polyposis is caused by mutations (changes) in the MUTYH gene that are inherited in an autosomal recessive manner. It is a type of hereditary cancer syndrome. Also called MAP.
    More Information
    - MYH-associated polyposis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10805/myh-associated-polyposis)
    - Familial adenomatous polyposis (MedlinePlus) (https://medlineplus.gov/genetics/condition/familial-adenomatous-polyposis/)
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  MVAC: An abbreviation for a chemotherapy combination used to treat advanced bladder cancer and urethral cancer. It includes the drugs methotrexate, vinblastine sulfate, doxorubicin hydrochloride (Adriamycin), and cisplatin. Also called MVAC regimen.
    More Information
    - MVAC (https://www.cancer.gov/about-cancer/treatment/drugs/MVAC)
  MVAC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "MVAC regimen"
    An abbreviation for a chemotherapy combination used to treat advanced bladder cancer and urethral cancer. It includes the drugs methotrexate, vinblastine sulfate, doxorubicin hydrochloride (Adriamycin), and cisplatin. Also called MVAC.
    More Information
    - MVAC (https://www.cancer.gov/about-cancer/treatment/drugs/MVAC)
  Mvasi: (em-VAH-see)
    Pronunciation of dictionary term "Mvasi"
    A drug that contains the active ingredient bevacizumab and is used to treat many different types of cancer. Mvasi is used alone or with other drugs to treat certain types of cervical cancer, colorectal cancer, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), and glioblastoma (a type of brain cancer). It is also being studied in the treatment of other types of cancer. Mvasi binds to a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody.
    More Information
    - Bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
  myalgia: (my-AL-juh)
    Pronunciation of dictionary term "myalgia"
    Pain in a muscle or group of muscles.
  myasthenia gravis: (MY-us-THEE-nee-uh GRA-vis)
    Pronunciation of dictionary term "myasthenia gravis"
    A disease in which antibodies made by a person’s immune system prevent certain nerve-muscle interactions. It causes weakness in the arms and legs, vision problems, and drooping eyelids or head. It may also cause paralysis and problems with swallowing, talking, climbing stairs, lifting things, and getting up from a sitting position. The muscle weakness gets worse during activity, and improves after periods of rest.
  MYC gene family: (… jeen FA-mih-lee)
    Pronunciation of dictionary term "MYC gene family"
    A family of genes that makes proteins involved in many cell functions, including cell growth, cell maturation, and cell death. Genetic changes in the DNA sequence of the MYC genes have been found in many types of cancer, including leukemia and lymphoma. These changes may cause cancer cells to grow and spread in the body. Members of the MYC gene family include C-MYC, L-MYC, and N-MYC.
  MYCN amplification study: (… AM-plih-fih-KAY-shun STUH-dee)
    Pronunciation of dictionary term "MYCN amplification study"
    A laboratory test in which cells in a sample of tumor tissue or bone marrow are checked to see how many copies of the MYCN gene are in the tumor DNA. MYCN is important for cell growth. Having more than 10 copies of the gene is called MYCN gene amplification. Tumors with MYCN gene amplification, such as neuroblastoma, are more likely to spread in the body and less likely to respond to treatment.
  Mycobutin: (MY-koh-BYOO-tin)
    Pronunciation of dictionary term "Mycobutin"
    A drug used to prevent the spread of a bacterium called in patients with advanced HIV (the virus that causes AIDS) infection. It blocks an enzyme that the bacteria need to grow. It is a type of antibiotic. Also called rifabutin.
  mycophenolate mofetil: (my-koh-FEH-noh-layt MOH-feh-til)
    Pronunciation of dictionary term "mycophenolate mofetil"
    A drug used to prevent graft-versus-host disease (GVHD) after organ transplants. It is also being studied in the prevention of GVHD after stem cell transplants for cancer, and in the treatment of some autoimmune disorders. Mycophenolate mofetil is a type of immunosuppressive agent. Also called CellCept.
  mycosis fungoides: (my-KOH-sis fun-GOY-deez)
    Pronunciation of dictionary term "mycosis fungoides"
    A type of non-Hodgkin lymphoma that first appears on the skin and can spread to the lymph nodes or other organs such as the spleen, liver, or lungs.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  mycosis fungoides patch: (my-KOH-sis fun-GOY-deez …)
    Pronunciation of dictionary term "mycosis fungoides patch"
    A flat, thin, pink or red patchy rash that forms on the skin of patients with a type of skin lymphoma called mycosis fungoides. The patches may be dry, scaly, and itchy and may look like eczema or psoriasis. They can occur anywhere on the body, but they are most common on the lower abdomen, upper thighs, buttocks, and breasts. The patches may sometimes become plaques (hard, raised lesions) on the skin.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  mycosis fungoides plaque: (my-KOH-sis fun-GOY-deez plak)
    Pronunciation of dictionary term "mycosis fungoides plaque"
    A small, raised bump or thick, hard lesion that forms on the skin of patients with a type of skin lymphoma called mycosis fungoides. Plaques may be red, scaly, and itchy and may look like eczema or psoriasis. They can occur anywhere on the body, but they are most common on the lower abdomen, upper thighs, buttocks, and breasts. Plaques may sometimes become tumors on the skin.
  Mycostatin: (MY-koh-STA-tin)
    Pronunciation of dictionary term "Mycostatin"
    A drug used to treat infections caused by fungi (a type of microorganism). It is made by certain strains of bacteria and kills fungi by binding to their membranes. Mycostatin is a type of antifungal agent.
  myelin: (MY-eh-lin)
    Pronunciation of dictionary term "myelin"
    The fatty substance that covers and protects nerves.
  myeloablation: (MY-eh-loh-a-BLAY-shun)
    Pronunciation of dictionary term "myeloablation"
    A severe form of myelosuppression. Myelosuppression is a condition in which bone marrow activity is decreased, resulting in fewer red blood cells, white blood cells, and platelets. It is a side effect of some cancer treatments. Also called severe myelosuppression.
  myeloablative chemotherapy: (MY-eh-loh-a-BLAY-tiv KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "myeloablative chemotherapy"
    High-dose chemotherapy that kills cells in the bone marrow, including cancer cells. It lowers the number of normal blood-forming cells in the bone marrow, and can cause severe side effects. Myeloablative chemotherapy is usually followed by a bone marrow or stem cell transplant to rebuild the bone marrow.
  myeloblast: (MY-eh-loh-blast)
    Pronunciation of dictionary term "myeloblast"
    A type of immature white blood cell that forms in the bone marrow. Myeloblasts become mature white blood cells called granulocytes (neutrophils, basophils, and eosinophils).
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  myeloblastic: (MY-eh-loh-BLAS-tik)
    Pronunciation of dictionary term "myeloblastic"
    Refers to myeloblasts (a type of immature cell that forms in the bone marrow).
  myelodysplasia: (MY-eh-loh-dis-PLAY-zhuh)
    Pronunciation of dictionary term "myelodysplasia"
    Abnormal bone marrow cells that may lead to myelogenous leukemia.
  myelodysplastic syndrome: (MY-eh-loh-dis-PLAS-tik SIN-drome)
    Pronunciation of dictionary term "myelodysplastic syndrome"
    A type of cancer in which the bone marrow does not make enough healthy blood cells (white blood cells, red blood cells, and platelets) and there are abnormal cells in the blood and/or bone marrow. When there are fewer healthy blood cells, infection, anemia, or bleeding may occur. Sometimes, myelodysplastic syndrome becomes acute myeloid leukemia (AML). Also called MDS.
    More Information
    - Myelodysplastic Syndromes Treatment
  myelofibrosis: (MY-eh-loh-fy-BROH-sis)
    Pronunciation of dictionary term "myelofibrosis"
    A disorder in which the bone marrow is replaced by fibrous tissue.
  myelogenous: (MY-eh-LAH-jeh-nus)
    Pronunciation of dictionary term "myelogenous"
    Having to do with, produced by, or resembling the bone marrow. Sometimes used as a synonym for myeloid; for example, acute myeloid leukemia and acute myelogenous leukemia are the same disease.
  myelogram: (MY-eh-loh-gram)
    Pronunciation of dictionary term "myelogram"
    An x-ray of the spinal cord after an injection of dye into the space between the lining of the spinal cord and brain.
  myeloid: (MY-eh-loyd)
    Pronunciation of dictionary term "myeloid"
    Having to do with or resembling the bone marrow. May also refer to certain types of hematopoietic (blood-forming) cells found in the bone marrow. Sometimes used as a synonym for myelogenous; for example, acute myeloid leukemia and acute myelogenous leukemia are the same disease.
  myeloid sarcoma: (MY-eh-loyd sar-KOH-muh)
    Pronunciation of dictionary term "myeloid sarcoma"
    A rare type of cancer that is made up of myeloblasts (a type of immature white blood cell) and forms outside the bone marrow and blood. The tumor cells may look green when viewed under a microscope. Myeloid sarcomas can occur anywhere in the body. They most commonly occur in people with acute myeloid leukemia or a myeloproliferative disorder. Also called chloroma, extramedullary myeloid tumor, and granulocytic sarcoma.
  myeloma: (MY-eh-LOH-muh)
    Pronunciation of dictionary term "myeloma"
    Cancer that arises in plasma cells, a type of white blood cell.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Multiple myeloma. Multiple myeloma cells are abnormal plasma cells (a type of white blood cell) that build up in the bone marrow and form tumors in many bones of the body. Normal plasma cells make antibodies to help the body fight infection and disease. As the number of multiple myeloma cells increases, more antibodies are made. This can cause the blood to thicken and keep the bone marrow from making enough healthy blood cells. Multiple myeloma cells also damage and weaken the bone.
    Multiple myeloma; drawing shows normal plasma cells, multiple myeloma cells (abnormal plasma cells), and antibodies. Also shown is red marrow inside bone, where plasma cells are made.
  myelomatosis: (MY-eh-loh-muh-TOH-sis)
    Pronunciation of dictionary term "myelomatosis"
    A type of cancer that begins in plasma cells (white blood cells that produce antibodies). Also called Kahler disease, multiple myeloma, and plasma cell myeloma.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
    Multiple myeloma. Multiple myeloma cells are abnormal plasma cells (a type of white blood cell) that build up in the bone marrow and form tumors in many bones of the body. Normal plasma cells make antibodies to help the body fight infection and disease. As the number of multiple myeloma cells increases, more antibodies are made. This can cause the blood to thicken and keep the bone marrow from making enough healthy blood cells. Multiple myeloma cells also damage and weaken the bone.
    Multiple myeloma; drawing shows normal plasma cells, multiple myeloma cells (abnormal plasma cells), and antibodies. Also shown is red marrow inside bone, where plasma cells are made.
  myelomonocyte: (MY-eh-loh-MAH-noh-site)
    Pronunciation of dictionary term "myelomonocyte"
    An abnormal type of white blood cell that is found in chronic myelomonocytic leukemia. These cells are similar to both monocytes and myelocytes (immature cells that develop into different types of immune system cells).
  myeloproliferative neoplasm: (MY-eh-loh-proh-LIH-feh-ruh-tiv NEE-oh-PLA-zum)
    Pronunciation of dictionary term "myeloproliferative neoplasm"
    A type of disease in which the bone marrow makes too many red blood cells, platelets, or certain white blood cells. Myeloproliferative neoplasms usually get worse over time as the number of extra cells build up in the blood and/or bone marrow. This may cause bleeding problems, anemia, infection, fatigue, or other signs and symptoms. Certain myeloproliferative neoplasms may become acute myeloid leukemia (AML). Myeloproliferative neoplasms include chronic myelogenous leukemia (CML), polycythemia vera, primary myelofibrosis, essential thrombocythemia, chronic neutrophilic leukemia, and chronic eosinophilic leukemia. Also called chronic myeloproliferative neoplasm.
    More Information
    - Myeloproliferative Neoplasms (https://www.cancer.gov/types/myeloproliferative)
  myelosclerosis with myeloid metaplasia: (MY-eh-loh-skleh-ROH-sis ... MY-eh-loyd meh-tuh-PLAY-zhuh)
    Pronunciation of dictionary term "myelosclerosis with myeloid metaplasia"
    A progressive, chronic disease in which the bone marrow is replaced by fibrous tissue and blood is made in organs such as the liver and the spleen, instead of in the bone marrow. This disease is marked by an enlarged spleen and progressive anemia. Also called agnogenic myeloid metaplasia, chronic idiopathic myelofibrosis, idiopathic myelofibrosis, and primary myelofibrosis.
  myelosuppression: (MY-eh-loh-suh-PREH-shun)
    Pronunciation of dictionary term "myelosuppression"
    A condition in which bone marrow activity is decreased, resulting in fewer red blood cells, white blood cells, and platelets. Myelosuppression is a side effect of some cancer treatments. When myelosuppression is severe, it is called myeloablation.
  myelosuppressive therapy: (MY-eh-loh-suh-PREH-siv THAYR-uh-pee)
    Pronunciation of dictionary term "myelosuppressive therapy"
    Treatment that stops or slows the growth of blood-forming cells in the bone marrow. Myelosuppressive therapies, such as chemotherapy and radiation therapy, kill normal cells and cancer cells in the bone marrow. This lowers the number of normal red blood cells, white blood cells, and platelets in the blood and bone marrow. Myelosuppressive therapy may be given before a bone marrow or stem cell transplant. It may also be used to treat some blood conditions, such as polycythemia vera (a disease in which there are too many red blood cells in the bone marrow and blood).
  Myleran: (MY-leh-ran)
    Pronunciation of dictionary term "Myleran"
    A drug that contains the active ingredient busulfan and is used to treat chronic myelogenous leukemia. Myleran damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent.
  Mylosar: (MY-loh-sar)
    Pronunciation of dictionary term "Mylosar"
    A drug used to treat myelodysplastic syndromes. It is also being studied in the treatment of other conditions and types of cancer. Mylosar stops cells from making DNA and may kill abnormal blood cells or cancer cells. It is a type of antimetabolite. Also called azacitidine and Vidaza.
  Mylotarg: (MY-loh-targ)
    Pronunciation of dictionary term "Mylotarg"
    A drug used alone or with other drugs to treat acute myeloid leukemia that is CD33 positive (expresses the protein CD33). It is used in adults and in children aged 1 month and older whose disease is newly diagnosed. It is also used in adults and in children aged 2 years and older whose disease has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Mylotarg contains a monoclonal antibody that binds to CD33, which is found on some leukemia cells. It also contains an anticancer drug, which may help kill cancer cells. Mylotarg is a type of antibody-drug conjugate. Also called gemtuzumab ozogamicin.
    More Information
    - Gemtuzumab Ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/gemtuzumabozogamicin)
  myocarditis: (MY-oh-kar-DY-tis)
    Pronunciation of dictionary term "myocarditis"
    A rare condition in which the heart muscle becomes thick and inflamed and may also become weak. Myocarditis is usually caused by a viral infection, but it may also be caused by bacterial, parasitic, or fungal infections; autoimmune disorders; or being exposed to radiation or certain chemicals or drugs. Signs and symptoms include chest pain, fast or abnormal heartbeat, trouble breathing, fatigue, and swelling of the legs. Other signs and symptoms include fever, headache, body aches, sore throat, and diarrhea. Some patients have mild symptoms or no symptoms at all. Sometimes the symptoms may be severe or life threatening and may lead to heart failure, stroke, or heart attack.
  myoclonic jerk: (MY-oh-KLAH-nik …)
    Pronunciation of dictionary term "myoclonic jerk"
    A sudden, brief, strong contraction of a muscle or group of muscles that cannot be controlled.
  myoinositol: (my-oh-ih-NOH-sih-TOL)
    Pronunciation of dictionary term "myoinositol"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Myoinositol helps cells make membranes and respond to messages from their environment. It has the same chemical formula as glucose (the chief source of energy for living organisms) but has a different arrangement of atoms. It is found in beans, peas, brown rice, wheat bran and nuts. It is water-soluble (can dissolve in water) and must be taken in every day. Myoinositol is being studied in the prevention of cancer. Also called inositol.
  myometrium: (my-oh-MEE-tree-um)
    Pronunciation of dictionary term "myometrium"
    The muscular outer layer of the uterus.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  myopericytoma: (my-oh-PAYR-ih-sy-TOH-muh)
    Pronunciation of dictionary term "myopericytoma"
    A rare, slow-growing soft tissue tumor that begins in cells that wrap around blood vessels. Most myopericytomas are benign (not cancer). They can occur anywhere in the body, but usually occur in the legs, trunk (chest and abdomen), or head and neck. They can occur in children, but are most common in middle-aged adults.
  myristyl nicotinate cream: (mih-RIS-til NIH-kuh-TIH-nayt kreem)
    Pronunciation of dictionary term "myristyl nicotinate cream"
    A substance being studied in the prevention of skin cancer. Myristyl nicotinate cream is also being studied as a way to help lessen the side effects of retinoic acid (a form of vitamin A) when it is used to treat skin that has been damaged by the sun. Myristyl nicotinate cream contains a form of niacin (a member of the vitamin B complex). It is a type of chemopreventive agent.
  myxofibrosarcoma: (MIK-soh-FY-broh-sar-KOH-muh)
    Pronunciation of dictionary term "myxofibrosarcoma"
    A rare type of cancer that forms in fibrous (connective) tissue, usually in or just under the skin of the arms and legs. There may be more than one tumor, and it sometimes spreads to nearby tissue or to other parts of the body. Myxofibrosarcoma may also recur (come back) after treatment. It may occur in children, but is most common in older adults. It is a type of soft tissue sarcoma.
  myxoid liposarcoma: (MIK-soyd LIH-poh-sar-KOH-muh)
    Pronunciation of dictionary term "myxoid liposarcoma"
    A rare type of cancer that begins in fat cells. It usually occurs in the thigh, but it may also occur in the buttock, back of the abdomen, or trunk (chest and abdomen). Some myxoid liposarcoma cells have a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). Myxoid liposarcoma usually occurs in adults, and is rare in children and adolescents. It is a type of soft tissue sarcoma.
  MZL: An indolent (slow-growing) type of B-cell non-Hodgkin lymphoma that begins forming in certain areas (the marginal zones) of lymph tissue. There are three types based on whether it forms in the spleen, lymph nodes, or other lymphoid tissue that contains a lot of B cells (a type of white blood cell). Also called marginal zone B-cell lymphoma and marginal zone lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  Ménétrier disease: (MAY-nay-tree-AY dih-ZEEZ)
    Pronunciation of dictionary term "Ménétrier disease"
    A condition marked by inflammation and ulcers (breaks on the skin or on the surface of an organ) of the mucosa (inner lining) of the stomach and by overgrowth of the cells that make up the mucosa. Symptoms include vomiting, diarrhea, and weight loss. Patients with Ménétrier disease may be at a higher risk of stomach cancer. Also called gastric mucosal hypertrophy and giant hypertrophic gastritis.
  N-acetyl-L-cysteine: (… A-seh-til … SIS-teh-een)
    Pronunciation of dictionary term "N-acetyl-L-cysteine"
    A drug usually used to reduce the thickness of mucus and ease its removal. It is also used to reverse the toxicity of high doses of acetaminophen. Also called acetylcysteine and N-acetylcysteine.
  N-acetylcysteine: (... A-seh-til-SIS-teh-een)
    Pronunciation of dictionary term "N-acetylcysteine"
    A drug usually used to reduce the thickness of mucus and ease its removal. It is also used to reverse the toxicity of high doses of acetaminophen. Also called acetylcysteine and N-acetyl-L-cysteine.
  N-acetyldinaline: (… A-seh-til-dih-nuh-leen)
    Pronunciation of dictionary term "N-acetyldinaline"
    A substance that is being studied as an anticancer drug in the treatment of non-small cell lung cancer. Also called CI-994.
  N-benzoyl-staurosporine: (...BEN-zoyl-STAW-roh-SPOR-een)
    Pronunciation of dictionary term "N-benzoyl-staurosporine"
    A drug used alone or with other anticancer drugs to treat adults with certain types of acute myeloid leukemia, mast cell leukemia, or systemic mastocytosis. It is also being studied in the treatment of other types of cancer. N-benzoyl-staurosporine blocks certain proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. N-benzoyl-staurosporine is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called midostaurin, PKC412, and Rydapt.
    More Information
    - Midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin)
  N-butyl-N-(4-hydroxybutyl) nitrosamine: (... BYOO-tul ... (4-hy-DROK-see-BYOO-tul) ny-TROH-suh-meen)
    Pronunciation of dictionary term "N-butyl-N-(4-hydroxybutyl) nitrosamine"
    A substance that is used in cancer research to cause bladder tumors in laboratory animals. This is done to test new diets, drugs, and procedures for use in cancer prevention and treatment.
  nabilone: (NA-bih-lone)
    Pronunciation of dictionary term "nabilone"
    A synthetic pill form of an active chemical in marijuana called delta-9-tetrahydrocannabinol (THC). Nabilone is used to treat nausea and vomiting caused by chemotherapy in patients who have not been helped by other therapy. It is a type of cannabinoid. Also called Cesamet.
  NaCl: Chemical abbreviation for sodium chloride (table salt).
  NADC: A type of cancer that is more likely to occur in people who are infected with human immunodeficiency virus (HIV) than in people who are not infected. NADCs include Hodgkin lymphoma and cancers of the mouth, throat, liver, lung, and anus. In addition to HIV infection, other factors, such as older age, infection with other viruses (such as HPV or hepatitis B or C virus), and heavy alcohol or tobacco use, may increase the risk of developing a NADC. Also called non-AIDS-defining cancer.
    More Information
    - HIV Infection and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hiv-fact-sheet)
  nadofaragene firadenovec: (NA-doh-FAR-uh-jeen FIR-uh-DEH-noh-vek)
    Pronunciation of dictionary term "nadofaragene firadenovec"
    A drug used to treat adults with a certain type of high-risk bladder cancer that has not invaded the muscle layers of the bladder. It is used in patients whose cancer has not gotten better after treatment with Bacillus Calmette-Guérin (BCG). It is also being studied in the treatment of other types of cancer. Nadofaragene firadenovec is a weakened adenovirus that carries a copy of the gene for interferon alfa-2b into bladder cancer cells. This may help the body’s immune system recognize the cancer cells and kill them. Nadofaragene firadenovec is given in a solution that is placed directly into the bladder using a thin tube called a catheter. It is a type of gene therapy. Also called Adstiladrin.
    More Information
    - Nadofaragene Firadenovec-vncg (https://www.cancer.gov/about-cancer/treatment/drugs/nadofaragene-firadenovec-vncg)
  NAE inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "NAE inhibitor"
    A substance that blocks an enzyme called NEDD8-activating enzyme (NAE). NAE is involved in important cell functions, such as cell division. Blocking NAE may help keep cancer cells from growing and may kill them. Some NAE inhibitors are being studied in the treatment of cancer. They are a type of targeted therapy. Also called NEDD8-activating enzyme inhibitor.
  NAFLD: A common condition in which fat builds up in the liver of people who drink little or no alcohol. There are two types of NAFLD, simple or nonalcoholic fatty liver (NAFL) and nonalcoholic steatohepatitis (NASH). NAFL causes little or no inflammation or damage in the liver and usually does not cause serious liver problems. NASH is the more serious type of NAFLD. It can cause liver inflammation and damage to the cells in the liver. This may lead to cirrhosis (scarring of the liver), liver failure, or liver cancer. NAFLD usually affects middle-aged and older adults but is becoming more common in children and teens. It is especially common in people who are overweight or who have obesity, diabetes, or high levels of cholesterol and triglycerides (a type of fat) in the blood. Also called nonalcoholic fatty liver disease.
    More Information
    - Non-alcoholic fatty liver disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/non-alcoholic-fatty-liver-disease/)
  nail dystrophy: (... DIS-truh-fee)
    Pronunciation of dictionary term "nail dystrophy"
    Abnormal changes in the shape, color, texture, and growth of the fingernails or toenails. Nail dystrophy is often caused by infection or injury to the nail. It may also be caused by certain conditions, including psoriasis, eczema, warts, cysts, and some tumors. Changes in nails can also be a sign of chronic heart, lung, liver, or kidney disease. Treatment with certain drugs, including chemotherapy drugs, can also cause changes to the nails. Also called onychodystrophy.
  naloxone: (na-LOK-sone)
    Pronunciation of dictionary term "naloxone"
    A substance that is being studied as a treatment for constipation caused by narcotic medications. It belongs to the family of drugs called narcotic antagonists.
  naltrexone: (nal-TREK-sone)
    Pronunciation of dictionary term "naltrexone"
    A drug that blocks the action of opiates (drugs used to treat pain). It may be used in the treatment of intravenous opiate addiction or alcohol dependence. Naltrexone is also being studied in the treatment of breast cancer. It may block the effects of the hormone estrogen, which causes some breast cancer cells to grow, or block the blood flow to tumors. It is a type of opiate antagonist. Also called naltrexone hydrochloride, ReVia, and Vivitrol.
  naltrexone hydrochloride: (nal-TREK-sone HY-droh-KLOR-ide)
    Pronunciation of dictionary term "naltrexone hydrochloride"
    A drug that blocks the action of opiates (drugs used to treat pain). It may be used in the treatment of intravenous opiate addiction or alcohol dependence. Naltrexone hydrochloride is also being studied in the treatment of breast cancer. It may block the effects of the hormone estrogen, which causes some breast cancer cells to grow, or block the blood flow to tumors. It is a type of opiate antagonist. Also called ReVia and Vivitrol.
  Namenda: (nuh-MEN-duh)
    Pronunciation of dictionary term "Namenda"
    A drug used to treat dementia caused by Alzheimer disease. It is also being studied in the treatment of side effects from whole-brain radiation therapy for cancer and other conditions. Namenda blocks the uptake of calcium by certain brain cells and decreases their activity. It is a type of N-methyl-D-asparatate (NMDA) receptor antagonist. Also called memantine hydrochloride.
  nanogram: (NA-noh-gram)
    Pronunciation of dictionary term "nanogram"
    A measure of weight. One nanogram weighs a billion times less than one gram, and almost a trillion-times less than a pound.
  nanometer: (NA-noh-MEE-ter)
    Pronunciation of dictionary term "nanometer"
    A measure of length in the metric system. A nanometer is one billionth of a meter. An average human hair is about 60,000 nanometers thick. Nanometers are used to measure wavelengths of light and distances between atoms in molecules.
  nanomole: (NA-noh-mole)
    Pronunciation of dictionary term "nanomole"
    The amount of a substance equal to a billionth of a mole (a measure of the amount of a substance). Also called nM.
  nanoparticle: (NA-noh-PAR-tih-kul)
    Pronunciation of dictionary term "nanoparticle"
    A particle of that is smaller than 100 nanometers (one-billionth of a meter). In medicine, nanoparticles can be used to carry antibodies, drugs, imaging agents, or other substances to certain parts of the body. Nanoparticles are being studied in the detection, diagnosis, and treatment of cancer.
  nanoparticle paclitaxel: (NA-noh-PAR-tih-kul PA-klih-TAK-sil)
    Pronunciation of dictionary term "nanoparticle paclitaxel"
    A form of the anticancer drug paclitaxel that is used alone or with other drugs to treat certain types of breast cancer, non-small cell lung cancer, and pancreatic cancer. Nanoparticle paclitaxel may have fewer side effects and work better than other forms of paclitaxel. It is also being studied in the treatment of other types of cancer. Nanoparticle paclitaxel stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called ABI-007, Abraxane, paclitaxel albumin-stabilized nanoparticle formulation, and protein-bound paclitaxel.
    More Information
    - Paclitaxel Albumin-stabilized Nanoparticle Formulation (https://www.cancer.gov/about-cancer/treatment/drugs/nanoparticlepaclitaxel)
  nanoprobe: (NA-noh-probe)
    Pronunciation of dictionary term "nanoprobe"
    A device that uses x-rays instead of visible light to form images of very small structures, such as the insides of blood vessels and cells. It can be used to study processes such as angiogenesis (growth of blood vessels). The term nanoprobe is also used to describe very small particles that can be used in the detection, diagnosis, and treatment of cancer.
  nanotechnology: (NA-noh-tek-NAH-loh-jee)
    Pronunciation of dictionary term "nanotechnology"
    The field of research that deals with the engineering and creation of things from materials that are less than 100 nanometers (one-billionth of a meter) in size, especially single atoms or molecules. Nanotechnology is being studied in the detection, diagnosis, and treatment of cancer.
  Naprosyn: (NA-proh-sin)
    Pronunciation of dictionary term "Naprosyn"
    A drug used to treat mild pain and the symptoms of arthritis and several other conditions. It is also being studied in the treatment of bone pain in patients with cancer. Naprosyn stops the body from making substances that cause pain and inflammation. It is a type of nonsteroidal anti-inflammatory drug (NSAID) and a type of cyclooxygenase inhibitor. Also called naproxen.
  naproxen: (nuh-PROK-sen)
    Pronunciation of dictionary term "naproxen"
    A drug used to treat mild pain and the symptoms of arthritis and several other conditions. It is also being studied in the treatment of bone pain in patients with cancer. Naproxen stops the body from making substances that cause pain and inflammation. It is a type of nonsteroidal anti-inflammatory drug (NSAID) and a type of cyclooxygenase inhibitor. Also called Naprosyn.
  narcotic: (nar-KAH-tik)
    Pronunciation of dictionary term "narcotic"
    A substance used to treat moderate to severe pain. Narcotics are like opiates such as morphine and codeine, but are not made from opium. They bind to opioid receptors in the central nervous system. Narcotics are now called opioids.
  Naropin: (NUH-roh-pin)
    Pronunciation of dictionary term "Naropin"
    A drug used to control pain and to cause a temporary loss of feeling in one part of the body, during and after surgery. It is also being studied for pain control after cancer surgery. It is a type of local anesthetic. Also called ropivacaine hydrochloride.
  nasal: (NAY-zul)
    Pronunciation of dictionary term "nasal"
    By or having to do with the nose.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  nasal cavity: (NAY-zul KA-vuh-tee)
    Pronunciation of dictionary term "nasal cavity"
    The space inside the nose. The nasal cavity lies above the bone that forms the roof of the mouth and curves down at the back to join the throat. It is divided into two sections called nasal passages. Air moves through these passages during breathing. The nasal passages filter and warm the air, and make it moist before it goes into the lungs. They also contain special cells that are involved in the sense of smell.
  nasal vestibule: (NAY-zul VEH-stih-byool)
    Pronunciation of dictionary term "nasal vestibule"
    The area just inside the nostril (nose opening) that leads into the nasal cavity. The nasal vestibule is supported by the cartilage of the nose and is lined with tissue that contains short, coarse hairs. These hairs help filter dust and other particles to keep them from entering the lungs.
  NASH: A type of liver disease in which fat builds up in the liver of people who drink little or no alcohol. This causes inflammation of the liver and damage to the cells in the liver, which may lead to cirrhosis (scarring of the liver) and liver failure. People with NASH are at increased risk of developing liver cancer. It is more common in middle-aged adults, especially in those who are overweight or obese or who have diabetes or high levels of cholesterol and triglycerides (a type of fat) in the blood. Also called nonalcoholic steatohepatitis.
    More Information
    - Nonalcoholic steatohepatitis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6430/nonalcoholic-steatohepatitis)
    - Non-alcoholic fatty liver disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/non-alcoholic-fatty-liver-disease/)
  nasogastric: (NAY-zoh-GAS-trik)
    Pronunciation of dictionary term "nasogastric"
    Describes the passage from the nose to the stomach. For example, a nasogastric tube is inserted through the nose, down the throat and esophagus, and into the stomach.
  nasogastric tube: (NAY-zoh-GAS-trik toob)
    Pronunciation of dictionary term "nasogastric tube"
    A tube that is inserted through the nose, down the throat and esophagus, and into the stomach. It can be used to give drugs, liquids, and liquid food, or used to remove substances from the stomach. Giving food through a nasogastric tube is a type of enteral nutrition. Also called gastric feeding tube and NG tube.
  Nasonex: (NAY-zoh-nex)
    Pronunciation of dictionary term "Nasonex"
    A drug that is used in a cream to treat certain skin conditions and in a nasal spray to treat sinus problems caused by allergies. It is being studied as a way to treat inflammation of the skin caused by radiation therapy. Nasonex is a type of corticosteroid. Also called Elocon and mometasone furoate.
  nasopharyngeal cancer: (NAY-zoh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "nasopharyngeal cancer"
    Cancer that forms in tissues of the nasopharynx (upper part of the throat behind the nose). Most nasopharyngeal cancers are squamous cell carcinomas (cancer that begins in flat cells lining the nasopharynx).
    More Information
    - Nasopharyngeal Cancer Treatment
  nasopharynx: (NAY-zoh-FAYR-inx)
    Pronunciation of dictionary term "nasopharynx"
    The upper part of the throat behind the nose. An opening on each side of the nasopharynx leads into the ear.
    More Information
    - Nasopharyngeal Cancer Treatment
    Anatomy of the pharynx. The pharynx is a hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. The three parts of the pharynx are the nasopharynx, oropharynx, and hypopharynx.
    Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.
  nasoscope: (NAY-zoh-skope)
    Pronunciation of dictionary term "nasoscope"
    A thin tube-like instrument used to examine the inside of the nose. A nasoscope has a light and a lens for viewing and may have a tool to remove tissue. Also called rhinoscope.
  nasoscopy: (nay-ZOS-koh-pee)
    Pronunciation of dictionary term "nasoscopy"
    Examination of the inside of the nose using a nasoscope (or rhinoscope). A nasoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. Also called rhinoscopy.
  National Cancer Institute: (NA-shuh-nul KAN-ser IN-stih-TOOT)
    Pronunciation of dictionary term "National Cancer Institute"
    The National Cancer Institute, part of the National Institutes of Health of the United States Department of Health and Human Services, is the Federal Government's principal agency for cancer research. The National Cancer Institute conducts, coordinates, and funds cancer research, training, health information dissemination, and other programs with respect to the cause, diagnosis, prevention, and treatment of cancer. Access the National Cancer Institute Web site at http://www.cancer.gov. Also called NCI.
    More Information
    - National Cancer Institute Overview and Mission (https://www.cancer.gov/about-nci/overview)
  National Center for Complementary and Integrative Health: (NA-shuh-nul SEN-ter ... KOM-pleh-MEN-tuh-ree ... IN-teh-gray-tiv helth)
    Pronunciation of dictionary term "National Center for Complementary and Integrative Health"
    A federal agency that uses science to explore complementary and integrative health (CIH) practices, trains CIH researchers, and provides authoritative information about CIH to professionals and the public. The National Center for Complementary and Integrative Health awards grants for research projects, training, and career development in CIH; sponsors conferences, educational programs, and exhibits; studies ways to use proven CIH practices along with conventional medical practice; and supports adding CIH to medical, dental, and nursing school programs. The National Center for Complementary and Integrative Health is part of the National Institutes of Health. Also called NCCIH.
    More Information
    - National Center for Complementary and Integrative Health (https://www.nccih.nih.gov/)
  National Clinical Trials Network: (NA-shuh-nul KLIH-nih-kul TRY-uls NET-wurk)
    Pronunciation of dictionary term "National Clinical Trials Network"
    A National Cancer Institute (NCI) program that gives funds and other support to cancer research organizations to conduct cancer clinical trials. The National Clinical Trials Network (NCTN) helps these organizations develop new clinical trials and manage their regulatory, financial, membership, and scientific committees. It also helps with statistics and data management, Institutional Review Boards (IRBs), and patient tissue sample collection and storage. This support allows researchers to conduct trials that focus on specific cancers and patient populations and new treatment methods. The groups in the NCTN include the Alliance for Clinical Trials in Oncology, ECOG-ACRIN Cancer Research Group, NRG Oncology, SWOG, Children’s Oncology Group (COG), and the NCI of Canada-Clinical Trials Group (NCIC-CTG). The NCTN was previously known as the NCI Clinical Trials Cooperative Group Program. Also called NCTN.
    More Information
    - NCTN: NCI’s National Clinical Trials Network (https://www.cancer.gov/research/infrastructure/clinical-trials/nctn)
  National Institutes of Health: (NA-shuh-nul IN-stih-TOOTS … helth)
    Pronunciation of dictionary term "National Institutes of Health"
    A federal agency in the U.S. that conducts biomedical research in its own laboratories; supports the research of non-Federal scientists in universities, medical schools, hospitals, and research institutions throughout the country and abroad; helps in the training of research investigators; and fosters communication of medical information. Access the National Institutes of Health Web site at http://www.nih.gov. Also called NIH.
  National Lung Screening Trial: (NA-shuh-nul … SKREE-ning TRY-ul)
    Pronunciation of dictionary term "National Lung Screening Trial"
    A lung cancer screening trial sponsored by the National Cancer Institute (NCI). In the trial, low-dose spiral CT scans were compared with chest x-rays for their ability to detect lung cancer early. The trial included more than 50,000 participants who were aged 55 to 74 years, were current or former heavy smokers, and had no signs or symptoms of lung cancer. The results of the trial showed that participants who were screened with spiral CT scans had about a 20% lower risk of dying from lung cancer than those who were screened with chest x-rays. Also called NLST.
    More Information
    - National Lung Screening Trial (https://www.cancer.gov/types/lung/research/nlst)
    - Lung Cancer Screening
  natural history study: (NA-chuh-rul HIH-stuh-ree STUH-dee)
    Pronunciation of dictionary term "natural history study"
    A study that follows a group of people over time who have, or are at risk of developing, a specific medical condition or disease. A natural history study collects health information in order to understand how the medical condition or disease develops and how to treat it.
  natural killer cell: (NA-chuh-rul KIH-ler sel)
    Pronunciation of dictionary term "natural killer cell"
    A type of immune cell that has granules (small particles) with enzymes that can kill tumor cells or cells infected with a virus. A natural killer cell is a type of white blood cell. Also called NK cell and NK-LGL.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  natural killer T cell: (NA-chuh-rul KIH-ler … sel)
    Pronunciation of dictionary term "natural killer T cell"
    A type of immune cell that plays an important role in the body’s first immune response to invading microorganisms. Natural killer T cells are a type of T cell that also have certain features of natural killer (NK) cells. They can kill invading microorganisms, such as bacteria and viruses, by releasing cytokines. They can also kill certain cells, such as cancer cells, either directly or by causing other immune cells to kill them. If natural killer T cells become inactive, this may contribute to the development and progression of certain diseases, such as cancer. Also called NKT cell.
  natural killer-cell large granular lymphocyte leukemia: (NA-chuh-rul KIH-ler-sel larj GRAN-yoo-lur LIM-foh-site loo-KEE-mee-uh)
    Pronunciation of dictionary term "natural killer-cell large granular lymphocyte leukemia"
    A type of leukemia in which large natural killer (NK) cells (a type of white blood cell) that contain granules (small particles) are found in the blood. It is a chronic disease that may last for a long time and get worse. Also called NK-LGL leukemia and NK-LGLL.
  naturopathy: (NAY-cher-AH-puh-thee)
    Pronunciation of dictionary term "naturopathy"
    A system of disease prevention and treatment that avoids drugs and surgery. Naturopathy is based on the use of natural agents such as air, water, light, heat, and massage to help the body heal itself. It also uses herbal products, nutrition, acupuncture, and aromatherapy as forms of treatment.
  nausea: (NAW-zee-uh)
    Pronunciation of dictionary term "nausea"
    A feeling of sickness or discomfort in the stomach that may come with an urge to vomit. Nausea is a side effect of some types of cancer therapy.
    More Information
    - Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
  Navelbine: (nay-VEL-been)
    Pronunciation of dictionary term "Navelbine"
    A drug used alone or with cisplatin to treat non-small cell lung cancer that is locally advanced or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Navelbine blocks cell growth by stopping cell division and may cause cancer cells to die. It is a type of vinca alkaloid and a type of antimitotic agent. Also called vinorelbine tartrate.
    More Information
    - Vinorelbine Tartrate (https://www.cancer.gov/about-cancer/treatment/drugs/vinorelbinetartrate)
  navitoclax: (na-VIH-toh-klax)
    Pronunciation of dictionary term "navitoclax"
    A substance being studied in the treatment of lymphomas and other types of cancer. It blocks some of the enzymes that keep cancer cells from dying. It is a type of Bcl-2 family inhibitor. Also called ABT-263.
  naxitamab: (nak-SIH-tuh-mab)
    Pronunciation of dictionary term "naxitamab"
    A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF) to treat children aged 1 year and older and adults with certain types of high-risk neuroblastoma in the bone or bone marrow that came back or did not get better with other treatment. It is also being studied in the treatment of other types of cancer. Naxitamab binds to a substance called GD2, which is found on some types of cancer cells. Naxitamab may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Danyelza.
  NB1011: A substance that is being studied for its ability to make cancer cells respond to drugs to which they have become resistant. It is a type of nucleoside analog.
  NBCCS: A rare, inherited disorder that affects many organs and tissues in the body. People with this disorder have a very high risk of developing basal cell skin cancer during adolescence or early adulthood. They are also at risk of developing medulloblastoma (a type of brain cancer) and other types of cancer. NBCCS may also cause benign (not cancer) tumors in the jaw, heart, or ovaries. Other signs and symptoms include a large head and unusual facial features; small pits in the skin on the hands and feet; abnormalities of the spine, ribs, or skull; eye problems; and developmental problems. NBCCS is caused by a mutation (change) in the PTCH1 gene. Also called basal cell nevus syndrome, BCNS, Gorlin syndrome, and nevoid basal cell carcinoma syndrome.
    More Information
    - Nevoid basal cell carcinoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7166/basal-cell-nevus-syndrome)
    - Gorlin syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/gorlin-syndrome/)
    Basal cell carcinoma. A skin cancer lesion that looks reddish brown and slightly raised (left panel) and a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
    Photographs showing a skin cancer lesion that looks reddish brown and slightly raised (left panel) and the back of a person’s ear with a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
  NBI-3001: A substance being studied in the treatment of cancer. It is made by combining interleukin-4 with a bacterial toxin. NBI-3001 is a type of recombinant chimeric protein. Also called interleukin-4 PE38KDEL cytotoxin and interleukin-4 PE38KDEL immunotoxin.
  NCCIH: A federal agency that uses science to explore complementary and integrative health (CIH) practices, trains CIH researchers, and provides authoritative information about CIH to professionals and the public. NCCIH awards grants for research projects, training, and career development in CIH; sponsors conferences, educational programs, and exhibits; studies ways to use proven CIH practices along with conventional medical practice; and supports adding CIH to medical, dental, and nursing school programs. NCCIH is part of the National Institutes of Health. Also called National Center for Complementary and Integrative Health.
    More Information
    - National Center for Complementary and Integrative Health (https://www.nccih.nih.gov/)
  NCI: NCI, part of the National Institutes of Health of the United States Department of Health and Human Services, is the Federal Government's principal agency for cancer research. It conducts, coordinates, and funds cancer research, training, health information dissemination, and other programs with respect to the cause, diagnosis, prevention, and treatment of cancer. Access the NCI Web site at http://www.cancer.gov. Also called National Cancer Institute.
    More Information
    - National Cancer Institute Overview and Mission (https://www.cancer.gov/about-nci/overview)
  NCI clinical trials cooperative group: (... KLIH-nih-kul TRY-uls koh-AH-pruh-tiv groop)
    Pronunciation of dictionary term "NCI clinical trials cooperative group"
    A group of researchers, cancer centers, and community doctors who are involved in studies that test new ways to screen, prevent, diagnose, and treat cancer. Clinical trials run by cooperative groups are funded and supported by the National Cancer Institute (NCI), and large numbers of patients take part in many locations. The current U.S. cooperative groups are the Alliance for Clinical Trials in Oncology, ECOG-ACRIN Cancer Research Group, NRG Oncology, SWOG, and Children’s Oncology Group (COG). The NCI clinical trials cooperative groups are part of the National Clinical Trials Network (NCTN).
  NCI-supported clinical trial: (… suh-POR-ted KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "NCI-supported clinical trial"
    A research study conducted by researchers and institutions that receive funding or other resources from the National Cancer Institute (NCI). Resources from NCI include programs that provide scientific review and Institutional Review Board (IRB) support and management of patient tissue sample collection and storage. NCI also provides information about the clinical trials, such as regulatory requirements, patient enrollment, funding, and education materials to these researchers. This support allows the people who run the clinical trials more time for patient care and research. NCI-supported trials include trials that are part of NCI’s national networks, such as National Clinical Trials Network (NCTN), NCI Community Oncology Research Program (NCORP), and Experimental Therapeutics Clinical Trials Network (ETCTN). NCI also funds, in full or in part, trials taking place at NCI-designated cancer centers throughout the U.S. and trials taking place at the NIH Clinical Center in Bethesda, Maryland.
  NCTN: A National Cancer Institute (NCI) program that gives funds and other support to cancer research organizations to conduct cancer clinical trials. The NCTN helps these organizations develop new clinical trials and manage their regulatory, financial, membership, and scientific committees. It also helps with statistics and data management, Institutional Review Boards (IRBs), and patient tissue sample collection and storage. This support allows researchers to conduct trials that focus on specific cancers and patient populations and new treatment methods. The groups in the NCTN include the Alliance for Clinical Trials in Oncology, ECOG-ACRIN Cancer Research Group, NRG Oncology, SWOG, Children’s Oncology Group (COG), and the NCI of Canada-Clinical Trials Group (NCIC-CTG). The NCTN was previously known as the NCI Clinical Trials Cooperative Group Program. Also called National Clinical Trials Network.
    More Information
    - NCTN: NCI’s National Clinical Trials Network (https://www.cancer.gov/research/infrastructure/clinical-trials/nctn)
  NCX 4016: A substance being studied in the prevention of colorectal cancer. It is a form of aspirin that gives off nitric oxide gas and is less irritating to the lining of the stomach than plain aspirin. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called nitric oxide-releasing acetylsalicylic acid derivative.
  NDGA: A drug put on the skin to treat growths caused by sun exposure. A form of NDGA that is taken by mouth is being studied in the treatment of prostate cancer. NDGA is an antioxidant, and it may block certain enzymes needed for tumor growth. Also called Actinex, masoprocol, and nordihydroguaiaretic acid.
  NDV: Newcastle disease virus. A bird virus that is being studied in the treatment of cancer. It may be used to kill cancer cells directly, or it may be given as a cancer vaccine to stimulate the body’s immune system. NDV is a type of biological response modifier and vaccine therapy. Also called Newcastle disease virus.
    More Information
    - Newcastle Disease Virus
  nebulizer: (NEH-byoo-LY-zer)
    Pronunciation of dictionary term "nebulizer"
    A device used to turn liquid into a fine spray.
  necitumumab: (NEH-sih-TOO-moo-mab)
    Pronunciation of dictionary term "necitumumab"
    A drug used with gemcitabine and cisplatin to treat squamous non-small cell lung cancer that has spread to other parts of the body. It is used in patients whose cancer has not been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Necitumumab binds to a protein called epidermal growth factor receptor (EGFR), which is found on some types of cancer cells. Blocking this protein may help keep cancer cells from growing. Necitumumab is a type of monoclonal antibody. Also called Portrazza.
    More Information
    - Necitumumab (https://www.cancer.gov/about-cancer/treatment/drugs/necitumumab)
  neck dissection: (... dy-SEK-shun)
    Pronunciation of dictionary term "neck dissection"
    Surgery to remove lymph nodes and other tissues in the neck.
  necrosis: (neh-KROH-sis)
    Pronunciation of dictionary term "necrosis"
    Refers to the death of living tissues.
  NEDD8-activating enzyme inhibitor: (… AK-tih-vay-ting EN-zime in-HIH-bih-ter)
    Pronunciation of dictionary term "NEDD8-activating enzyme inhibitor"
    A substance that blocks an enzyme called NEDD8-activating enzyme (NAE). NAE is involved in important cell functions, such as cell division. Blocking NAE may help keep cancer cells from growing and may kill them. Some NEDD8-activating enzyme inhibitors are being studied in the treatment of cancer. They are a type of targeted therapy. Also called NAE inhibitor.
  needle biopsy: (NEE-dul BY-op-see)
    Pronunciation of dictionary term "needle biopsy"
    The removal of tissue or fluid with a needle for examination under a microscope. When a wide needle is used, the procedure is called a core biopsy. When a thin needle is used, the procedure is called a fine-needle aspiration biopsy.
  needle localization: (NEE-dul LOH-kuh-lih-ZAY-shun)
    Pronunciation of dictionary term "needle localization"
    A procedure used to mark a small area of abnormal tissue so it can be removed by surgery. An imaging device is used to guide a thin wire with a hook at the end through a hollow needle to place the wire in or around the abnormal area. Once the wire is in the right place, the needle is removed and the wire is left in place so the doctor will know where the abnormal tissue is. The wire is removed when a biopsy is done. Also called needle/wire localization and wire localization.
  needle-localized biopsy: (NEE-dul-LOH-kuh-lized BY-op-see)
    Pronunciation of dictionary term "needle-localized biopsy"
    A procedure to mark and remove abnormal tissue when the doctor cannot feel a lump. An imaging device is used to guide a thin wire with a hook on the end through a hollow needle to place the wire in or around the abnormal area. Once the wire is in the right place, the needle is removed and the wire is left in so the doctor will know where the abnormal tissue is. The wire is removed at the time the biopsy is done.
  needle/wire localization: (NEE-dul … LOH-kuh-lih-ZAY-shun)
    Pronunciation of dictionary term "needle/wire localization"
    A procedure used to mark a small area of abnormal tissue so it can be removed by surgery. An imaging device is used to guide a thin wire with a hook at the end through a hollow needle to place the wire in or around the abnormal area. Once the wire is in the right place, the needle is removed and the wire is left in place so the doctor will know where the abnormal tissue is. The wire is removed when a biopsy is done. Also called needle localization and wire localization.
  needling: (NEE-duh-ling)
    Pronunciation of dictionary term "needling"
    In acupuncture, the insertion of a thin needle into a specific place on the body to unlock qi (vital energy). The needle may be twirled, moved up and down at different speeds and depths, heated, or charged with a low electric current.
  nefazodone: (neh-FAY-zoh-done)
    Pronunciation of dictionary term "nefazodone"
    A drug used to treat depression. It belongs to the family of drugs called antidepressant agents. Also called Serzone.
  negative axillary lymph node: (NEH-guh-tiv AK-sih-LAYR-ee limf ...)
    Pronunciation of dictionary term "negative axillary lymph node"
    A lymph node in the armpit that is free of cancer.
  negative for intraepithelial lesion or malignancy: (NEH-guh-tiv … IN-truh-eh-pih-THEE-lee-ul LEE-zhun … muh-LIG-nun-see)
    Pronunciation of dictionary term "negative for intraepithelial lesion or malignancy"
    A Pap test finding that means no cancer cells or other abnormal cells have been found on the surface of or in the tissue that lines the cervix. Cell changes that suggest inflammation or infection may be included in this finding. Also called negative Pap test result, NILM, and normal Pap test result.
  negative Pap test result: (NEH-guh-tiv ... reh-ZULT)
    Pronunciation of dictionary term "negative Pap test result"
    A Pap test finding that means no cancer cells or other abnormal cells have been found on the surface of or in the tissue that lines the cervix. Cell changes that suggest inflammation or infection may be included in this finding. Also called negative for intraepithelial lesion or malignancy, NILM, and normal Pap test result.
  negative predictive value: (NEH-guh-tiv preh-DIK-tiv VAL-yoo)
    Pronunciation of dictionary term "negative predictive value"
    The likelihood that a person who has a negative test result indeed does not have the disease, condition, biomarker, or mutation (change) in the gene being tested. The negative predictive value is a way of measuring how accurate a specific test is. Also called NPV.
  negative test result: (NEH-guh-tiv ... reh-ZULT)
    Pronunciation of dictionary term "negative test result"
    A test result that shows the substance or condition the test is supposed to find is not present at all or is present, but in normal amounts. In genetics, a negative test result usually means that a person does not have a mutation (change) in the gene, chromosome, or protein that is being tested. More testing may be needed to make sure a negative test result is correct.
  nelarabine: (neh-LAR-uh-been)
    Pronunciation of dictionary term "nelarabine"
    A drug used to treat adults and children aged 1 year and older with T-cell acute lymphoblastic leukemia and T-cell lymphoblastic lymphoma. It is used in patients whose cancer has not gotten better or has recurred (come back) after treatment with other anticancer drugs. Nelarabine stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called 506U78 and Arranon.
    More Information
    - Nelarabine (https://www.cancer.gov/about-cancer/treatment/drugs/nelarabine)
  nelfinavir mesylate: (nel-FIH-nuh-veer MEH-zih-layt)
    Pronunciation of dictionary term "nelfinavir mesylate"
    A drug that interferes with the ability of a virus to make copies of itself.
  neoadjuvant therapy: (NEE-oh-A-juh-vunt THAYR-uh-pee)
    Pronunciation of dictionary term "neoadjuvant therapy"
    Treatment given as a first step to shrink a tumor before the main treatment, which is usually surgery, is given. Examples of neoadjuvant therapy include chemotherapy, radiation therapy, and hormone therapy. It is a type of induction therapy.
  neoantigen: (NEE-oh-AN-tih-jen)
    Pronunciation of dictionary term "neoantigen"
    A new protein that forms on cancer cells when certain mutations occur in tumor DNA. Neoantigens may play an important role in helping the body make an immune response against cancer cells. Neoantigens used in vaccines and other types of immunotherapy are being studied in the treatment of many types of cancer.
  neoplasia: (NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "neoplasia"
    Abnormal and uncontrolled cell growth.
  neoplasm: (NEE-oh-PLA-zum)
    Pronunciation of dictionary term "neoplasm"
    An abnormal mass of tissue that forms when cells grow and divide more than they should or do not die when they should. Neoplasms may be benign (not cancer) or malignant (cancer). Benign neoplasms may grow large but do not spread into, or invade, nearby tissues or other parts of the body. Malignant neoplasms can spread into, or invade, nearby tissues. They can also spread to other parts of the body through the blood and lymph systems. Also called tumor.
    More Information
    - What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)
  neoplastic meningitis: (NEE-oh-PLAS-tik MEH-nin-JY-tis)
    Pronunciation of dictionary term "neoplastic meningitis"
    A serious condition in which cancer cells spread from the original (primary) tumor to the meninges (the thin layers of tissue that cover and protect the brain and spinal cord). This can cause the meninges to become inflamed and cerebrospinal fluid and pressure to build up in the brain. Neoplastic meningitis can happen in many types of cancer, but it is most common in people with breast cancer, lung cancer, or melanoma. Also called carcinomatous meningitis, leptomeningeal carcinoma, leptomeningeal carcinomatosis, leptomeningeal metastasis, meningeal carcinomatosis, and meningeal metastasis.
  nephrectomy: (neh-FREK-toh-mee)
    Pronunciation of dictionary term "nephrectomy"
    Surgery to remove a kidney or part of a kidney. In a partial nephrectomy, part of one kidney or a tumor is removed, but not an entire kidney. In a simple nephrectomy, one kidney is removed. In a radical nephrectomy, an entire kidney, nearby adrenal gland and lymph nodes, and other surrounding tissue are removed. In a bilateral nephrectomy, both kidneys are removed.
  nephritis: (neh-FRY-tis)
    Pronunciation of dictionary term "nephritis"
    A condition in which the tissues in the kidney become inflamed and have problems filtering waste from the blood. Nephritis may be caused by infection, inflammatory conditions (such as lupus), certain genetic conditions, and other diseases or conditions. It may also be caused by taking certain medicines or being exposed to certain chemicals. Signs and symptoms include blood and protein in the urine; high blood pressure; swelling of the face, hands, feet, and legs; fatigue; and anemia. If not treated or controlled, nephritis may lead to kidney damage and kidney failure. Also called glomerulonephritis.
  nephrologist: (neh-FRAH-loh-jist)
    Pronunciation of dictionary term "nephrologist"
    A doctor who has special training in diagnosing and treating kidney disease.
  nephrostomy: (neh-FROS-toh-mee)
    Pronunciation of dictionary term "nephrostomy"
    Surgery to make an opening from the outside of the body to the renal pelvis (part of the kidney that collects urine). This may be done to drain urine from a blocked kidney or blocked ureter into a bag outside the body. It may also be done to look at the kidney using an endoscope (thin, lighted tube attached to a camera), to place anticancer drugs directly into the kidney, or to remove kidney stones.
  nephrotic syndrome: (neh-FRAH-tik SIN-drome)
    Pronunciation of dictionary term "nephrotic syndrome"
    A combination of symptoms caused by damage to the tiny blood vessels in the kidney that filter waste and extra fluid from the blood and send them to the bladder as urine. Signs and symptoms of nephrotic syndrome include higher-than-normal amounts of protein in the urine and fat and cholesterol in the blood. Swelling, especially in the legs, feet, or ankles, may occur. Nephrotic syndrome may be caused by certain diseases that affect only the kidneys or by infection, immune system disorders (such as lupus), certain genetic disorders, and other diseases or conditions, such as cancer, diabetes, and amyloidosis. It may also be caused by taking certain medicines. Nephrotic syndrome can occur in both children and adults.
    More Information
    - Nephrotic syndrome (https://medlineplus.gov/ency/article/000490.htm)
  nephrotomogram: (NEH-froh-TOH-moh-gram)
    Pronunciation of dictionary term "nephrotomogram"
    A series of x-rays of the kidneys. The x-rays are taken from different angles and show the kidneys clearly, without the shadows of the organs around them.
  nephrotoxic: (NEH-froh-TOK-sik)
    Pronunciation of dictionary term "nephrotoxic"
    Poisonous or damaging to the kidney.
  nephroureterectomy: (NEH-froh-YER-eh-ter-EK-toh-mee)
    Pronunciation of dictionary term "nephroureterectomy"
    Surgery to remove a kidney and its ureter. Also called ureteronephrectomy.
  neratinib maleate: (neh-RA-tih-nib MAY-lee-AYT)
    Pronunciation of dictionary term "neratinib maleate"
    A drug used alone or with capecitabine to treat adults with certain types of HER2-positive breast cancer that have already been treated. It is also being studied in the treatment of other types of cancer. Neratinib maleate blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Nerlynx.
    More Information
    - Neratinib Maleate (https://www.cancer.gov/about-cancer/treatment/drugs/neratinibmaleate)
  Nerlynx: (NAYR-links)
    Pronunciation of dictionary term "Nerlynx"
    A drug used alone or with capecitabine to treat adults with certain types of HER2-positive breast cancer that have already been treated. It is also being studied in the treatment of other types of cancer. Nerlynx blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called neratinib maleate.
    More Information
    - Neratinib Maleate (https://www.cancer.gov/about-cancer/treatment/drugs/neratinibmaleate)
  nerve: (nerv)
    Pronunciation of dictionary term "nerve"
    A bundle of fibers that receives and sends messages between the body and the brain. The messages are sent by chemical and electrical changes in the cells that make up the nerves.
  nerve block: (nerv blok)
    Pronunciation of dictionary term "nerve block"
    A procedure in which medicine is injected directly into or around a nerve or into the spine to block pain.
  nerve cell: (nerv sel)
    Pronunciation of dictionary term "nerve cell"
    A type of cell that receives and sends messages from the body to the brain and back to the body. The messages are sent by a weak electrical current. Also called neuron.
  nerve grafting: (nerv GRAF-ting)
    Pronunciation of dictionary term "nerve grafting"
    Replacing a damaged nerve with a section of a healthy nerve that has been removed from another part of the body. This procedure is being studied in the prevention of erectile dysfunction in men having surgery for prostate cancer.
  nerve growth factor: (nerv grothe FAK-ter)
    Pronunciation of dictionary term "nerve growth factor"
    A protein made by the body that causes certain nerve cells to grow and helps keep them alive.
  nerve sheath: (nerv sheeth)
    Pronunciation of dictionary term "nerve sheath"
    The tissue that covers and protects the nerves that are outside the brain and spinal cord. The nerve sheath is made up of connective tissue and myelin (a substance that contains protein and fat).
  nerve-sparing radical prostatectomy: (nerv-SPAYR-ing RA-dih-kul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "nerve-sparing radical prostatectomy"
    Surgery to remove the prostate in which an attempt is made to save the nerves that help cause penile erections.
  nerve-sparing surgery: (nerv-SPAYR-ing SER-juh-ree)
    Pronunciation of dictionary term "nerve-sparing surgery"
    A type of surgery that attempts to save the nerves near the tissues being removed.
  nervous system: (NER-vus SIS-tem)
    Pronunciation of dictionary term "nervous system"
    The organized network of nerve tissue in the body. It includes the central nervous system (the brain and spinal cord), the peripheral nervous system (nerves that extend from the spinal cord to the rest of the body), and other nerve tissue.
  NES: A procedure in which small electric impulses are used to stimulate muscles that are weak or paralyzed. It helps to increase muscle strength, blood circulation, and range of motion and to lessen muscle spasms. Also called neuromuscular electrical stimulation, NMES, and therapeutic (subthreshold) electrical stimulation.
  netupitant and palonosetron hydrochloride: (neh-TOO-pih-tunt ... pa-loh-NOH-seh-tron HY-droh-KLOR-ide)
    Pronunciation of dictionary term "netupitant and palonosetron hydrochloride"
    A combination of two drugs used with dexamethasone in adults to prevent nausea and vomiting caused by chemotherapy. Netupitant and palonosetron hydrochloride blocks the action of certain chemicals in the central nervous system that may trigger nausea and vomiting. Blocking these chemicals may help lessen nausea and vomiting. Netupitant and palonosetron hydrochloride is a type of antiemetic. Also called Akynzeo.
    More Information
    - Netupitant and Palonosetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/netupitant-palonosetronhydrochloride)
  Neulasta: (noo-LA-stuh)
    Pronunciation of dictionary term "Neulasta"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Neulasta helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called filgrastim-SD/01, Fulphila, Nyvepria, pegfilgrastim, Udenyca, and Ziextenzo.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  Neumega: (noo-MEH-guh)
    Pronunciation of dictionary term "Neumega"
    A drug used to increase the number of blood cells, especially platelets, in some cancer patients receiving chemotherapy. Neumega is a form of interleukin-11 (a cytokine normally made by support cells in the bone marrow) that is made in the laboratory. It is a type of biological response modifier. Also called oprelvekin, recombinant human interleukin-11, and rhIL-11.
  Neupogen: (NOO-poh-jen)
    Pronunciation of dictionary term "Neupogen"
    A drug that contains the active ingredient filgrastim and is used to treat neutropenia (a lower-than-normal number of white blood cells), prevent infection, and prepare the blood for the collection of certain types of blood cells. Neupogen is used in patients who have certain cancers and neutropenia caused by some types of chemotherapy and in patients who have severe chronic neutropenia that is not caused by cancer treatment. It is also used before an autologous stem cell transplant. Neupogen helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  neural: (NOOR-ul)
    Pronunciation of dictionary term "neural"
    Having to do with nerves or the nervous system, including the brain and the spinal cord.
  neuro-oncologist: (NOOR-oh-on-KAH-loh-jist)
    Pronunciation of dictionary term "neuro-oncologist"
    A doctor who has special training in diagnosing and treating brain tumors and other tumors of the nervous system.
  neurobehavioral: (NOOR-oh-beh-HAY-vyer-ul)
    Pronunciation of dictionary term "neurobehavioral"
    Having to do with the way the brain affects emotion, behavior, and learning. Some cancers or their treatment may cause neurobehavioral problems.
  neuroblastoma: (NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "neuroblastoma"
    A type of cancer that forms from immature nerve cells. It usually begins in the adrenal glands but may also begin in the abdomen, chest, or in nerve tissue near the spine. Neuroblastoma most often occurs in children younger than 5 years of age. It is thought to begin before birth. It is usually found when the tumor begins to grow and cause signs or symptoms.
    More Information
    - Neuroblastoma (https://www.cancer.gov/types/neuroblastoma)
    Neuroblastoma may be found in the adrenal glands and paraspinal nerve tissue from the neck to the pelvis.
    Drawing shows parts of the body where neuroblastoma may be found, including the paraspinal nerve tissue and the adrenal glands. Also shown are the spine and right and left kidney.
  neurocognitive: (NOOR-oh-KOG-nih-tiv)
    Pronunciation of dictionary term "neurocognitive"
    Having to do with the ability to think and reason. This includes the ability to concentrate, remember things, process information, learn, speak, and understand.
  neurodegenerative disorder: (NOOR-oh-dee-JEH-neh-ruh-tiv dis-OR-der)
    Pronunciation of dictionary term "neurodegenerative disorder"
    A type of disease in which cells of the central nervous system stop working or die. Neurodegenerative disorders usually get worse over time and have no cure. They may be genetic or be caused by a tumor or stroke. Neurodegenerative disorders also occur in people who drink large amounts of alcohol or are exposed to certain viruses or toxins. Examples of neurodegenerative disorders include Alzheimer's disease and Parkinson's disease.
  neuroectodermal tumor: (NOOR-oh-EK-toh-DER-mul TOO-mer)
    Pronunciation of dictionary term "neuroectodermal tumor"
    A tumor of the central or peripheral nervous system.
  neuroendocrine: (NOOR-oh-EN-doh-krin)
    Pronunciation of dictionary term "neuroendocrine"
    Having to do with the interactions between the nervous system and the endocrine system. Neuroendocrine describes certain cells that release hormones into the blood in response to stimulation of the nervous system.
  neuroendocrine carcinoma of the skin: (NOOR-oh-EN-doh-krin KAR-sih-NOH-muh …)
    Pronunciation of dictionary term "neuroendocrine carcinoma of the skin"
    A rare type of cancer that forms on or just beneath the skin, usually in parts of the body that have been exposed to the sun. It is most common in older people and in people with weakened immune systems. Also called Merkel cell cancer, Merkel cell carcinoma, and trabecular cancer.
    More Information
    - Merkel Cell Carcinoma Treatment
    Anatomy of the skin showing the epidermis, dermis, and subcutaneous tissue. Merkel cells are in the layer of basal cells at the deepest part of the epidermis and are connected to nerves.
    Anatomy of the skin with Merkel cells; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the epidermis with Merkel cells above the dermis with a vein and artery. Nerves are connected to Merkel cells.
  neuroendocrine tumor: (NOOR-oh-EN-doh-krin TOO-mer)
    Pronunciation of dictionary term "neuroendocrine tumor"
    A tumor that forms from cells that release hormones into the blood in response to a signal from the nervous system. Neuroendocrine tumors may make higher-than-normal amounts of hormones, which can cause many different symptoms. These tumors may be benign (not cancer) or malignant (cancer). Some examples of neuroendocrine tumors are carcinoid tumors, islet cell tumors, medullary thyroid cancer, pheochromocytomas, neuroendocrine carcinoma of the skin (Merkel cell cancer), small cell lung cancer, and large cell neuroendocrine carcinoma (a rare type of lung cancer).
  neuroepithelial: (NOOR-oh-eh-pih-THEE-lee-ul)
    Pronunciation of dictionary term "neuroepithelial"
    Having to do with tissue made up of sensory cells, such as tissue found in the ear, nose, and tongue.
  neurofeedback: (NOOR-oh-FEED-bak)
    Pronunciation of dictionary term "neurofeedback"
    A treatment being studied to improve brain function in certain brain disorders and in patients treated with chemotherapy for breast cancer. Sensors are placed on a person’s head, which allows brain activity to be shown as patterns on a computer screen. A beep or a tone may be used as a reward to a person for changing certain brain activities. Neurofeedback may help cancer patients deal with the stress and mental side effects of chemotherapy. Also called EEG biofeedback.
  neurofibroma: (NOOR-oh-fy-BROH-muh)
    Pronunciation of dictionary term "neurofibroma"
    A benign tumor that develops from the cells and tissues that cover nerves.
  neurofibromatosis type 1: (NOOR-oh-FY-broh-muh-TOH-sis ...)
    Pronunciation of dictionary term "neurofibromatosis type 1"
    A rare genetic condition that causes brown spots and tumors on the skin, freckling in skin areas not exposed to the sun, tumors on the nerves, and developmental changes in the nervous system, muscles, bone, and skin. Also called NF1.
    More Information
    - Neurofibromatosis type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7866/neurofibromatosis-type-1)
    - Neurofibromatosis type 1 (MedlinePlus) (https://medlineplus.gov/genetics/condition/neurofibromatosis-type-1/)
  neurofibromatosis type 1-like syndrome: (NOOR-oh-FY-broh-muh-TOH-sis … SIN-drome)
    Pronunciation of dictionary term "neurofibromatosis type 1-like syndrome"
    A rare genetic condition marked by flat brown spots on the skin. The number of brown spots on the skin tends to increase throughout childhood. Other signs and symptoms include an abnormally large head, unusual facial features, and freckling in the armpits and groin. People with this syndrome may have mild learning and developmental delays. Neurofibromatosis type 1-like syndrome is a type of disease called a RASopathy that is caused by mutations (changes) in the SPRED1 gene. This gene makes a protein involved in a cell signaling pathway that controls many important cell functions. Also called Legius syndrome.
  neurofibromatosis type 2: (NOOR-oh-FY-broh-muh-TOH-sis ...)
    Pronunciation of dictionary term "neurofibromatosis type 2"
    A genetic condition in which tumors form on the nerves of the inner ear and cause loss of hearing and balance. Tumors may also occur in the brain and on nerves in the skull and spinal cord, and may cause loss of speech, eye movement, and the ability to swallow. Also called acoustic neurofibromatosis and NF2.
    More Information
    - Neurofibromatosis type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7193/neurofibromatosis-type-2)
    - Neurofibromatosis type 2 (MedlinePlus) (https://medlineplus.gov/genetics/condition/neurofibromatosis-type-2/)
  neuroglia: (noor-OH-glee-uh)
    Pronunciation of dictionary term "neuroglia"
    Any of the cells that hold nerve cells in place and help them work the way they should. The types of neuroglia include oligodendrocytes, astrocytes, microglia, and ependymal cells. Also called glial cell.
  neuroleptic agent: (NOOR-oh-LEP-tik AY-jent)
    Pronunciation of dictionary term "neuroleptic agent"
    A type of drug used to treat symptoms of psychosis. These include hallucinations (sights, sounds, smells, tastes, or touches that a person believes to be real but are not real), delusions (false beliefs), and dementia (loss of the ability to think, remember, learn, make decisions, and solve problems). Most neuroleptic agents block the action of certain chemicals in the nervous system. Also called antipsychotic and antipsychotic agent.
  neuroleptic malignant syndrome: (NOOR-oh-LEP-tik muh-LIG-nunt SIN-drome)
    Pronunciation of dictionary term "neuroleptic malignant syndrome"
    A life-threatening condition that may be caused by certain drugs used to treat mental illness, nausea, or vomiting. Symptoms include high fever, sweating, unstable blood pressure, confusion, and stiffness. Also called NMS.
  neurologic: (NOOR-oh-LAH-jik)
    Pronunciation of dictionary term "neurologic"
    Having to do with nerves or the nervous system.
  neurological exam: (NOOR-oh-LAH-jih-kul eg-ZAM)
    Pronunciation of dictionary term "neurological exam"
    A series of questions and tests to check brain, spinal cord, and nerve function. The exam checks a person’s mental status, coordination, ability to walk, and how well the muscles, sensory systems, and deep tendon reflexes work.
  neurologist: (noor-AH-loh-jist)
    Pronunciation of dictionary term "neurologist"
    A doctor who has special training in diagnosing and treating disorders of the nervous system.
  neuroma: (noor-OH-muh)
    Pronunciation of dictionary term "neuroma"
    A tumor that arises in nerve cells.
  neuromuscular electrical stimulation: (NOOR-oh-MUS-kyoo-ler ee-LEK-trih-kul STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "neuromuscular electrical stimulation"
    A procedure in which small electric impulses are used to stimulate muscles that are weak or paralyzed. It helps to increase muscle strength, blood circulation, and range of motion and to lessen muscle spasms. Also called NES, NMES, and therapeutic (subthreshold) electrical stimulation.
  neuromyotonia: (NOOR-oh-MY-oh-TOH-nee-uh)
    Pronunciation of dictionary term "neuromyotonia"
    A rare nerve disorder that causes constant muscle activity that cannot be controlled, even during sleep. It often affects the muscles in the arms and legs, but may affect the whole body. Symptoms include muscle twitching, weakness, stiffness, and cramping; increased skin temperature, sweating, and heart rate; and problems with chewing, swallowing, speech, and breathing. The disorder often gets worse over time. Neuromyotonia usually occurs in people aged 15 to 60 years. It may occur with certain types of cancer and is sometimes inherited. Also called Isaac syndrome.
    More Information
    - Isaacs' syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6793/isaac-syndrome)
  neuron: (NOOR-on)
    Pronunciation of dictionary term "neuron"
    A type of cell that receives and sends messages from the body to the brain and back to the body. The messages are sent by a weak electrical current. Also called nerve cell.
  neuronal tumor: (noor-OH-nul TOO-mer)
    Pronunciation of dictionary term "neuronal tumor"
    One of a group of rare tumors that begin in nerve cells of the brain or spinal cord. There are many different types of neuronal tumors, and they can occur in different parts of the brain or spinal cord. Most neuronal tumors are not cancer and tend to grow slowly. However, they can grow and press on nearby brain tissue, which can cause seizures, a buildup of fluid and increased pressure in the brain, and other problems. Neuronal tumors can occur at any age but are more common in children and young adults.
  neuropathologist: (NOOR-oh-puh-THAH-loh-jist)
    Pronunciation of dictionary term "neuropathologist"
    A pathologist who has special training in diseases of the nervous system. A pathologist identifies disease by studying cells and tissues under a microscope.
  neuropathy: (noor-AH-puh-thee)
    Pronunciation of dictionary term "neuropathy"
    A nerve problem that causes pain, numbness, tingling, swelling, or muscle weakness in different parts of the body. It usually begins in the hands or feet and gets worse over time. Neuropathy may be caused by cancer or cancer treatment, such as chemotherapy. It may also be caused by physical injury, infection, toxic substances, or conditions such as diabetes, kidney failure, or malnutrition. Also called peripheral neuropathy.
    More Information
    - Nerve Problems (Peripheral Neuropathy) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nerve-problems)
  neuropeptide: (NOOR-oh-PEP-tide)
    Pronunciation of dictionary term "neuropeptide"
    A member of a class of protein-like molecules made in the brain. Neuropeptides consist of short chains of amino acids, with some functioning as neurotransmitters and some functioning as hormones.
  neuropsychologist: (NOOR-oh-sy-KAH-loh-jist)
    Pronunciation of dictionary term "neuropsychologist"
    A psychologist who diagnoses and treats behavioral and other problems related to the way the brain works. These may include problems with social interactions, ability to control emotions and behaviors, and cognitive abilities (thinking, learning, remembering, and problem solving). These problems may be caused by brain disease, injury, or medical treatment, such as cancer treatment.
  neuropsychology: (NOOR-oh-sy-KAH-loh-jee)
    Pronunciation of dictionary term "neuropsychology"
    The study of how the brain and central nervous system are related to behavior.
  neuroradiologist: (NOOR-oh-RAY-dee-AH-loh-jist)
    Pronunciation of dictionary term "neuroradiologist"
    A doctor trained in radiology who specializes in creating and interpreting pictures of the nervous system. The pictures are produced using forms of radiation, such as x-rays, sound waves, or other types of energy.
  neurosphere: (NOOR-oh-sfeer)
    Pronunciation of dictionary term "neurosphere"
    A small cluster of nerve stem cells that is grown in the laboratory. Neurospheres can be grown that are similar to normal human nerve tissue or to a specific type of tumor. They can be used to study how nerve tissue forms and how certain nervous system diseases, such as Parkinson disease or brain tumors, develop. Neurospheres may also be used to test new treatments before they are given to people.
  neurosurgeon: (NOOR-oh-SER-jun)
    Pronunciation of dictionary term "neurosurgeon"
    A doctor who has special training in surgery on the brain, spine, and other parts of the nervous system.
  neurotoxicity: (NOOR-oh-tok-SIH-sih-tee)
    Pronunciation of dictionary term "neurotoxicity"
    The tendency of some treatments to cause damage to the nervous system.
  neurotoxin: (NOOR-oh-TOK-sin)
    Pronunciation of dictionary term "neurotoxin"
    A substance that is poisonous to nerve tissue.
  neurotransmitter: (NOOR-oh-tranz-MIH-ter)
    Pronunciation of dictionary term "neurotransmitter"
    A chemical that is made by nerve cells and used to communicate with other cells, including other nerve cells and muscle cells.
  neurotrophic tyrosine receptor kinase gene fusion: (NOOR-oh-TROH-fik TY-ruh-seen reh-SEP-ter KY-nays jeen FYOO-zhun)
    Pronunciation of dictionary term "neurotrophic tyrosine receptor kinase gene fusion"
    A mutation (change) that occurs when a piece of the chromosome containing a gene called NTRK breaks off and joins with a gene on another chromosome. Neurotrophic tyrosine receptor kinase gene fusions lead to abnormal proteins called TRK fusion proteins, which may cause cancer cells to grow. Neurotrophic tyrosine receptor kinase gene fusions may be found in some types of cancer, including cancers of the brain, head and neck, thyroid, soft tissue, lung, and colon. Also called NTRK gene fusion.
  neurotropism: (NOOR-oh-TROH-pih-zum)
    Pronunciation of dictionary term "neurotropism"
    An ability to invade and live in neural tissue. This term is usually used to describe the ability of viruses to infect nerve tissue.
  neutropenia: (noo-troh-PEE-nee-uh)
    Pronunciation of dictionary term "neutropenia"
    A condition in which there is a lower-than-normal number of neutrophils (a type of white blood cell) in the blood.
    More Information
    - Infection and Neutropenia during Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/infection)
  neutrophil: (NOO-troh-fil)
    Pronunciation of dictionary term "neutrophil"
    A type of white blood cell that is an important part of the immune system and helps the body fight infection. When microorganisms, such as bacteria or viruses, enter the body, neutrophils are one of the first immune cells to respond. They travel to the site of infection, where they destroy the microorganisms by ingesting them and releasing enzymes that kill them. Neutrophils also boost the response of other immune cells. A neutrophil is a type of granulocyte and a type of phagocyte.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  nevoid basal cell carcinoma syndrome: (NEE-voyd BAY-sul sel KAR-sih-NOH-muh SIN-drome)
    Pronunciation of dictionary term "nevoid basal cell carcinoma syndrome"
    A rare, inherited disorder that affects many organs and tissues in the body. People with this disorder have a very high risk of developing basal cell skin cancer during adolescence or early adulthood. They are also at risk of developing medulloblastoma (a type of brain cancer) and other types of cancer. Nevoid basal cell carcinoma syndrome may also cause benign (not cancer) tumors in the jaw, heart, or ovaries. Other signs and symptoms include a large head and unusual facial features; small pits in the skin on the hands and feet; abnormalities of the spine, ribs, or skull; eye problems; and developmental problems. Nevoid basal cell carcinoma syndrome is caused by a mutation (change) in the PTCH1 gene. Also called basal cell nevus syndrome, BCNS, Gorlin syndrome, and NBCCS.
    More Information
    - Nevoid basal cell carcinoma syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7166/basal-cell-nevus-syndrome)
    - Gorlin syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/gorlin-syndrome/)
    Basal cell carcinoma. A skin cancer lesion that looks reddish brown and slightly raised (left panel) and a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
    Photographs showing a skin cancer lesion that looks reddish brown and slightly raised (left panel) and the back of a person’s ear with a skin cancer lesion that looks like an open sore with a pearly rim (right panel).
  nevus: (NEE-vus)
    Pronunciation of dictionary term "nevus"
    A benign (not cancer) growth on the skin that is formed by a cluster of melanocytes (cells that make a substance called melanin, which gives color to skin and eyes). A nevus is usually dark and may be raised from the skin. Also called mole.
    More Information
    - Common Moles, Dysplastic Nevi, and Risk of Melanoma (https://www.cancer.gov/types/skin/moles-fact-sheet)
  nevus of Ota: (NEE-vus … OH-tah)
    Pronunciation of dictionary term "nevus of Ota"
    A condition marked by brown, blue, or gray patches, usually on the inside of the eye and on the skin near or around the eye. It may also affect the eyelid and mouth. It is caused by an increase in the number of cells called melanocytes in skin and eye tissue. Melanocytes make a substance called melanin, which gives color to skin and eyes. Having nevus of Ota may increase the risk of glaucoma and a type of eye cancer called intraocular melanoma. Also called oculodermal melanocytosis.
  new mutation: (noo myoo-TAY-shun)
    Pronunciation of dictionary term "new mutation"
    A term used to describe a change in the DNA sequence of a gene that is seen for the first time in a person and has not appeared in previous generations. A new mutation can explain how a person can have a genetic condition that did not occur in his or her parents. A new mutation can occur in an egg or sperm cell of a parent, in the fertilized egg soon after the egg and sperm unite, or in another type of cell during embryo development. A person who has a new mutation may pass the mutation to his or her child. Some new mutations may lead to cancer or other diseases. Also called de novo mutation, de novo variant, and new variant.
  new variant: (noo VAYR-ee-unt)
    Pronunciation of dictionary term "new variant"
    A term used to describe a change in the DNA sequence of a gene that is seen for the first time in a person and has not appeared in previous generations. A new variant can explain how a person can have a genetic condition that did not occur in his or her parents. A new variant can occur in an egg or sperm cell of a parent, in the fertilized egg soon after the egg and sperm unite, or in another type of cell during embryo development. A person who has a new variant may pass the mutation to his or her child. Some new variants may lead to cancer or other diseases. Also called de novo mutation, de novo variant, and new mutation.
  Newcastle disease virus: (NOO-ka-sul dih-ZEEZ VY-rus)
    Pronunciation of dictionary term "Newcastle disease virus"
    A bird virus that is being studied in the treatment of cancer. It may be used to kill cancer cells directly, or it may be given as a cancer vaccine to stimulate the body’s immune system. Newcastle disease virus is a type of biological response modifier and vaccine therapy. Also called NDV.
    More Information
    - Newcastle Disease Virus
  Nexavar: (NEK-suh-var)
    Pronunciation of dictionary term "Nexavar"
    A drug used to treat certain types of hepatocellular carcinoma (a type of liver cancer), renal cell carcinoma (a type of kidney cancer), and thyroid cancer. It is also being studied in the treatment of other types of cancer. Nexavar blocks certain proteins, which may help keep cancer cells from growing and dividing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Nexavar is a type of kinase inhibitor and a type of antiangiogenesis agent. Also called BAY 43-9006 and sorafenib tosylate.
    More Information
    - Sorafenib Tosylate (https://www.cancer.gov/about-cancer/treatment/drugs/sorafenibtosylate)
  Nexium: (NEK-see-um)
    Pronunciation of dictionary term "Nexium"
    A drug that blocks acid from being made in the stomach. It is used to treat acid reflux disease and to prevent certain types of gastrointestinal ulcers. Nexium is being studied in the prevention of esophageal cancer and in the treatment of other conditions, including side effects of chemotherapy. It is a type of anti-ulcer agent. Also called esomeprazole magnesium.
  next-generation sequencing: (... JEH-neh-RAY-shun SEE-kwen-sing)
    Pronunciation of dictionary term "next-generation sequencing"
    A term that describes methods used in the lab to learn the order of building blocks (called nucleotides) for millions of DNA or RNA fragments at the same time. Computers are used to piece together the fragments in order to sequence a person or other organism’s entire DNA, large segments of DNA or RNA, or the DNA in specific types of cells from a sample of tissue. Next-generation sequencing can also identify changes in certain areas of the genome or in specific genes. There are many different types of next-generation sequencing methods, including whole-genome sequencing, whole-exome sequencing, multigene panel testing, and transcriptome sequencing. Next-generation sequencing may help researchers understand the cause of certain diseases, such as cancer. Also called massively parallel sequencing and NGS.
  NF-kappa B: (…-KA-puh …)
    Pronunciation of dictionary term "NF-kappa B"
    A group of proteins that help control many functions in a cell, including cell growth and survival. These proteins also control the body’s immune and inflammatory responses. NF-kappa B may be overactive or found in higher than normal amounts in some types of cancer cells. This may lead to cancer cell growth. High levels or overactivity of NF-kappa B may also lead to inflammatory disorders, such as asthma and ulcerative colitis, and autoimmune disorders, such as rheumatoid arthritis. Also called NF-kB and nuclear factor-kappa B.
  NF-kB: A group of proteins that help control many functions in a cell, including cell growth and survival. These proteins also control the body’s immune and inflammatory responses. NF-kB may be overactive or found in higher than normal amounts in some types of cancer cells. This may lead to cancer cell growth. High levels or overactivity of NF-kB may also lead to inflammatory disorders, such as asthma and ulcerative colitis, and autoimmune disorders, such as rheumatoid arthritis. Also called NF-kappa B and nuclear factor-kappa B.
  NF1: A rare genetic condition that causes brown spots and tumors on the skin, freckling in skin areas not exposed to the sun, tumors on the nerves, and developmental changes in the nervous system, muscles, bone, and skin. Also called neurofibromatosis type 1.
    More Information
    - Neurofibromatosis type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7866/neurofibromatosis-type-1)
    - Neurofibromatosis type 1 (MedlinePlus) (https://medlineplus.gov/genetics/condition/neurofibromatosis-type-1/)
  NF2: A genetic condition in which tumors form on the nerves of the inner ear and cause loss of hearing and balance. Tumors may also occur in the brain and on nerves in the skull and spinal cord, and may cause loss of speech, eye movement, and the ability to swallow. Also called acoustic neurofibromatosis and neurofibromatosis type 2.
    More Information
    - Neurofibromatosis type 2 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7193/neurofibromatosis-type-2)
    - Neurofibromatosis type 2 (MedlinePlus) (https://medlineplus.gov/genetics/condition/neurofibromatosis-type-2/)
  NFE2L2: A protein that controls how certain genes are expressed. These genes help protect the cell from damage caused by free radicals (unstable molecules made during normal cell metabolism). Free radicals may play a part in cancer, heart disease, stroke, and other diseases of aging. Also called Nrf2 and nuclear factor (erythroid-derived 2)-like 2.
  NG tube: (…toob)
    Pronunciation of dictionary term "NG tube"
    A tube that is inserted through the nose, down the throat and esophagus, and into the stomach. It can be used to give drugs, liquids, and liquid food, or used to remove substances from the stomach. Giving food through an NG tube is a type of enteral nutrition. Also called gastric feeding tube and nasogastric tube.
  NG-monomethyl-L-arginine: (… MAH-noh-MEH-thul … AR-jih-neen)
    Pronunciation of dictionary term "NG-monomethyl-L-arginine"
    An amino acid derivative used to counteract high blood pressure caused by interleukin-2.
  NG-nitro-L-arginine: (… NY-troh … AR-jih-neen)
    Pronunciation of dictionary term "NG-nitro-L-arginine"
    A form of the amino acid arginine. An amino acid is a protein building block. NG-nitro-L-arginine is being studied in the treatment of cancer and other conditions. In cancer, it may stop the growth of tumor cells by blocking certain proteins needed for tumor cells to grow and by blocking blood flow to the tumor. It is a type of nitric oxide synthase inhibitor and an antiangiogenesis agent. Also called nitroarginine.
  NGR-TNF: A substance being studied in the treatment of cancer. It is made by linking tumor necrosis factor (TNF) to a peptide. The peptide binds to tumor blood vessels, and TNF damages them. It is a type of biological response modifier. Also called tumor vasculature–targeted tumor necrosis factor alpha.
  NGS: A term that describes methods used in the lab to learn the order of building blocks (called nucleotides) for millions of DNA or RNA fragments at the same time. Computers are used to piece together the fragments in order to sequence a person or other organism’s entire DNA, large segments of DNA or RNA, or the DNA in specific types of cells from a sample of tissue. NGS can also identify changes in certain areas of the genome or in specific genes. There are many different types of NGS methods, including whole-genome sequencing, whole-exome sequencing, multigene panel testing, and transcriptome sequencing. NGS may help researchers understand the cause of certain diseases, such as cancer. Also called massively parallel sequencing and next-generation sequencing.
  NHL: Any of a large group of cancers of lymphocytes (white blood cells). NHLs can occur at any age and are often marked by lymph nodes that are larger than normal, fever, and weight loss. There are many different types of NHL. These types can be divided into aggressive (fast-growing) and indolent (slow-growing) types, and they can be formed from either B-cells or T-cells. B-cell NHLs include Burkitt lymphoma, chronic lymphocytic leukemia/small lymphocytic lymphoma (CLL/SLL), diffuse large B-cell lymphoma, follicular lymphoma, immunoblastic large cell lymphoma, precursor B-lymphoblastic lymphoma, and mantle cell lymphoma. T-cell NHLs include mycosis fungoides, anaplastic large cell lymphoma, and precursor T-lymphoblastic lymphoma. Lymphomas that occur after bone marrow or stem cell transplantation are usually B-cell NHLs. Prognosis and treatment depend on the stage and type of disease. Also called non-Hodgkin lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  NHP2 gene: (... jeen)
    Pronunciation of dictionary term "NHP2 gene"
    A gene that makes a protein involved in protecting telomeres (the ends of chromosomes), which help keep chromosomes from sticking together or breaking down. The protein also helps stabilize a type of RNA involved in making proteins in the cell. Mutations (changes) in the NHP2 gene may lead to abnormal cell growth and cancer. NHP2 gene mutations have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
  niacin: (NY-uh-sin)
    Pronunciation of dictionary term "niacin"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Niacin helps some enzymes work properly and helps skin, nerves, and the digestive tract stay healthy. Niacin is found in many plant and animal products. It is water-soluble (can dissolve in water) and must be taken in every day. Not enough niacin can cause a disease called pellagra (a condition marked by skin, nerve, and digestive disorders). A form of niacin is being studied in the prevention of skin and other types of cancer. Niacin may help to lower blood cholesterol. Also called nicotinic acid and vitamin B3.
  niacinamide: (NY-uh-SIH-nuh-MIDE)
    Pronunciation of dictionary term "niacinamide"
    A form of niacin (vitamin B3) that the body needs in small amounts to function and stay healthy. Niacinamide is found in many plant and animal products and in dietary supplements. It is water-soluble (can dissolve in water) and must be taken in every day. Niacinamide may be used to treat diabetes and certain skin conditions and is being studied in the treatment of some types of cancer. It may increase blood flow to cancer cells and block certain enzymes they need to repair damage to their DNA. This may make cancer cells easier to kill with radiation therapy and chemotherapy. Niacinamide is a type of radiosensitizing agent and a type of chemosensitizing agent. Also called nicotinamide.
  nicotinamide: (NIH-koh-TIH-nuh-MIDE)
    Pronunciation of dictionary term "nicotinamide"
    A form of niacin (vitamin B3) that the body needs in small amounts to function and stay healthy. Nicotinamide is found in many plant and animal products and in dietary supplements. It is water-soluble (can dissolve in water) and must be taken in every day. Nicotinamide may be used to treat diabetes and certain skin conditions and is being studied in the treatment of some types of cancer. It may increase blood flow to cancer cells and block certain enzymes they need to repair damage to their DNA. This may make cancer cells easier to kill with radiation therapy and chemotherapy. Nicotinamide is a type of radiosensitizing agent and a type of chemosensitizing agent. Also called niacinamide.
  nicotine: (NIH-kuh-TEEN)
    Pronunciation of dictionary term "nicotine"
    An addictive, poisonous chemical found in tobacco. It can also be made in the laboratory. When it enters the body, nicotine causes an increased heart rate and use of oxygen by the heart, and a sense of well-being and relaxation. It is also used as an insecticide.
  nicotine gum: (NIH-kuh-TEEN…)
    Pronunciation of dictionary term "nicotine gum"
    A chewing gum that contains a small dose of nicotine, which enters the blood by being absorbed through the lining of the mouth. This helps stop nicotine cravings and relieves symptoms that occur when a person is trying to quit smoking. A prescription is not needed for nicotine gum.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  nicotine inhaler: (NIH-kuh-TEEN in-HAY-ler)
    Pronunciation of dictionary term "nicotine inhaler"
    A device used to inhale (breathe in) small doses of nicotine through the mouth. The nicotine is absorbed through the lining of the mouth and lungs and goes into the blood. This helps stop nicotine cravings and relieves symptoms that occur when a person is trying to quit smoking. A prescription is needed for nicotine inhalers.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  nicotine lozenge: (NIH-kuh-TEEN LAH-zinj)
    Pronunciation of dictionary term "nicotine lozenge"
    A hard candy-like tablet that contains a small dose of nicotine. The nicotine is absorbed through the lining of the mouth and goes into the blood. This helps stop nicotine cravings and relieves symptoms that occur when a person is trying to quit smoking. A prescription is not needed for nicotine lozenges.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  nicotine nasal spray: (NIH-kuh-TEEN NAY-zul…)
    Pronunciation of dictionary term "nicotine nasal spray"
    A nose spray that contains a small dose of nicotine, which enters the blood by being absorbed through the lining of the nose. This helps stop nicotine cravings and relieves symptoms that occur when a person is trying to quit smoking. A prescription is needed for nicotine nasal spray.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  nicotine patch: (NIH-kuh-TEEN...)
    Pronunciation of dictionary term "nicotine patch"
    A patch that sticks on the skin and contains a small dose of nicotine, which enters the blood by being absorbed through the skin. This helps stop nicotine cravings and relieves symptoms that occur when a person is trying to quit smoking. Nicotine patches are available with and without a prescription.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  nicotine replacement therapy: (NIH-kuh-TEEN reh-PLAYS-ment THAYR-uh-pee)
    Pronunciation of dictionary term "nicotine replacement therapy"
    A type of treatment that uses special products to give small, steady doses of nicotine to help stop cravings and relieve symptoms that occur when a person is trying to quit smoking. These products include nicotine gum, nicotine inhaler, nicotine nasal spray, nicotine lozenges, and nicotine patch, and some are available without a prescription. They do not contain any of the other chemicals found in tobacco products.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  nicotine vaccine: (NIH-kuh-TEEN vak-SEEN)
    Pronunciation of dictionary term "nicotine vaccine"
    A substance being studied to see if it can help people quit smoking or keep them from starting again. It may stimulate the body’s immune system to make antibodies against nicotine. These antibodies may help keep nicotine from reaching the brain, which can help reduce a person’s craving for nicotine.
  nicotinic acid: (NIH-kuh-TIH-nik A-sid)
    Pronunciation of dictionary term "nicotinic acid"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Nicotinic acid helps some enzymes work properly and helps skin, nerves, and the digestive tract stay healthy. Nicotinic acid is found in many plant and animal products. It is water-soluble (can dissolve in water) and must be taken in every day. Not enough nicotinic acid can cause a disease called pellagra (a condition marked by skin, nerve, and digestive disorders). A form of nicotinic acid is being studied in the prevention of skin and other types of cancer. Nicotinic acid may help to lower blood cholesterol. Also called niacin and vitamin B3.
  night sweats: Episodes of excessive sweating that occur during sleep. Night sweats can be severe and soak a person’s bedclothes and bed sheets, which may cause the person to wake up. Night sweats are a common symptom of menopause. They may also be caused by illness or medical conditions, such as infection, cancer, low blood sugar, hormone disorders, and neurologic conditions. They may also be a side effect of certain medicines, cancer treatment, too much caffeine or alcohol, or tobacco or drug use.
    More Information
    - Hot Flashes and Night Sweats
  NIH: A federal agency in the U.S. that conducts biomedical research in its own laboratories; supports the research of non-Federal scientists in universities, medical schools, hospitals, and research institutions throughout the country and abroad; helps in the training of research investigators; and fosters communication of medical information. Access the NIH Web site at http://www.nih.gov. Also called National Institutes of Health.
  Nijmegen breakage syndrome: (NY-may-gen BRAY-kij SIN-drome)
    Pronunciation of dictionary term "Nijmegen breakage syndrome"
    A rare inherited disorder marked by a small head, height that is shorter than normal, unusual facial features, and other growth and developmental problems. People with Nijmegen breakage syndrome have a weakened immune system, which may cause them to have frequent sinus, lung, and other respiratory tract infections. They are also at an increased risk of developing certain types of cancer, especially non-Hodgkin lymphoma, rhabdomyosarcoma (a type of soft tissue tumor), and brain cancer. Nijmegen breakage syndrome is caused by a mutation (change) in a gene called NBN, which is involved in DNA repair. It is a type of DNA repair deficiency syndrome and a type of autosomal recessive genetic disease.
    More Information
    - Nijmegen breakage syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3904/nijmegen-breakage-syndrome)
    - Nijmegen breakage syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/nijmegen-breakage-syndrome/)
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  Nilandron: (nih-LAN-drun)
    Pronunciation of dictionary term "Nilandron"
    A drug used to treat prostate cancer that has spread to other parts of the body. It is used in patients who have had surgery to remove the testicles (orchiectomy). Nilandron binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Nilandron blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called nilutamide.
    More Information
    - Nilutamide (https://www.cancer.gov/about-cancer/treatment/drugs/Nilutamide)
  NILM: A Pap test finding that means no cancer cells or other abnormal cells have been found on the surface of or in the tissue that lines the cervix. Cell changes that suggest inflammation or infection may be included in this finding. Also called negative for intraepithelial lesion or malignancy, negative Pap test result, and normal Pap test result.
  nilotinib: (ny-LOH-tih-nib)
    Pronunciation of dictionary term "nilotinib"
    A drug used to treat certain types of chronic myelogenous leukemia that are Philadelphia chromosome positive. It is also being studied in the treatment of other types of cancer. Nilotinib blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Tasigna.
    More Information
    - Nilotinib (https://www.cancer.gov/about-cancer/treatment/drugs/nilotinib)
  nilutamide: (ny-LOO-tuh-mide)
    Pronunciation of dictionary term "nilutamide"
    A drug used to treat prostate cancer that has spread to other parts of the body. It is used in patients who have had surgery to remove the testicles (orchiectomy). Nilutamide binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Nilutamide blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called Nilandron.
    More Information
    - Nilutamide (https://www.cancer.gov/about-cancer/treatment/drugs/Nilutamide)
  nimodipine: (ny-MOH-dih-peen)
    Pronunciation of dictionary term "nimodipine"
    Belongs to a family of drugs called calcium channel blockers. It is being investigated for use with anticancer drugs to prevent or overcome drug resistance and improve response to chemotherapy.
  nimotuzumab: (ny-moh-TOO-zoo-mab)
    Pronunciation of dictionary term "nimotuzumab"
    A substance being studied in the treatment of some types of cancer. Nimotuzumab binds to a protein called epidermal growth factor receptor (EGFR), which is found on some normal cells and some types of cancer cells. Blocking this protein may help keep cancer cells from growing. Nimotuzumab is a type of monoclonal antibody. Also called Theraloc.
  nimustine: (NY-mus-teen)
    Pronunciation of dictionary term "nimustine"
    A substance that has been studied in the treatment of some types of cancer. Nimustine damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea.
  Ninlaro: (nin-LAR-oh)
    Pronunciation of dictionary term "Ninlaro"
    A drug used with lenalidomide and dexamethasone to treat multiple myeloma. It is used in patients who received at least one other anticancer treatment. It is also being studied in the treatment of other types of cancer. Ninlaro blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called ixazomib citrate.
    More Information
    - Ixazomib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/ixazomibcitrate)
  Nipent: (NY-pent)
    Pronunciation of dictionary term "Nipent"
    The active ingredient in a drug that is used to treat hairy cell leukemia and is being studied in the treatment of other types of cancer. Nipent blocks a protein needed for cell growth and may kill cancer cells. It is made by a bacterium. It is a type of adenosine deaminase inhibitor. Also called pentostatin.
  nipple: (NIH-pul)
    Pronunciation of dictionary term "nipple"
    In anatomy, the small raised area in the center of the breast through which milk can flow to the outside.
    The female breast contains lobes, lobules, and ducts that produce and transport milk to the nipple. Fatty tissue gives the breast its shape, while muscles and the chest wall provide support. The lymphatic system, including lymph nodes, filter lymph and store white blood cells that help fight infection and disease.
    Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.
    Anatomy of the male breast. The nipple and areola are shown on the outside of the breast. The lymph nodes, fatty tissue, ducts, and other parts of the inside of the breast are also shown.
    Anatomy of the male breast; drawing shows the lymph nodes, nipple, areola, chest wall, ribs, muscle, fatty tissue, and ducts.
  nipple discharge: (NIH-pul DIS-charj)
    Pronunciation of dictionary term "nipple discharge"
    Fluid that is not milk coming from the nipple.
  niraparib tosylate monohydrate: (nih-RA-puh-rib TOH-suh-layt MAH-noh-HY-drayt)
    Pronunciation of dictionary term "niraparib tosylate monohydrate"
    A drug used to treat adults with certain types of ovarian epithelial, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Niraparib tosylate monohydrate blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Niraparib tosylate monohydrate is a type of PARP inhibitor. Also called Zejula.
    More Information
    - Niraparib Tosylate Monohydrate (https://www.cancer.gov/about-cancer/treatment/drugs/niraparibtosylatemonohydrate)
  niraparib tosylate monohydrate and abiraterone acetate: (nih-RA-puh-rib TOH-suh-layt MAH-noh-HY-drayt … A-bih-RA-teh-rone A-seh-tayt)
    Pronunciation of dictionary term "niraparib tosylate monohydrate and abiraterone acetate"
    A combination of two drugs used with prednisone to treat adults with prostate cancer that has spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). It is used in patients who have a certain type of abnormal BRCA gene. Niraparib tosylate monohydrate blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Abiraterone acetate lowers the amount of androgens (male hormones), such as testosterone, made by the body. This may stop the growth of cancer cells that need androgens to grow. The combination of niraparib tosylate monohydrate and abiraterone acetate may work better than either drug alone. Niraparib tosylate monohydrate and abiraterone acetate is a type of PARP inhibitor and a type of antiandrogen. Also called Akeega.
    More Information
    - Niraparib Tosylate Monohydrate and Abiraterone Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/niraparib-tosylate-monohydrate-and-abiraterone-acetate)
  nirogacestat hydrobromide: (NY-roh-GAY-seh-stat HY-droh-BROH-mide)
    Pronunciation of dictionary term "nirogacestat hydrobromide"
    A drug used to treat adults with desmoid tumors (a type of soft tissue tumor) that have gotten worse and need systemic therapy. It is also being studied in the treatment of other types of cancer. Nirogacestat hydrobromide binds to a protein called gamma secretase, which blocks the activation of other proteins called Notch receptors. Blocking these proteins may help keep tumor cells from growing and may kill them. Nirogacestat hydrobromide is a type of gamma secretase inhibitor. Also called Ogsiveo.
    More Information
    - Nirogacestat Hydrobromide (https://www.cancer.gov/about-cancer/treatment/drugs/nirogacestat)
  nitric acid: (NY-trik A-sid)
    Pronunciation of dictionary term "nitric acid"
    A toxic, corrosive, colorless liquid used to make fertilizers, dyes, explosives, and other chemicals.
  nitric oxide-releasing acetylsalicylic acid derivative: (NY-trik OK-side-reh-LEE-sing A-seh-til-SA-lih-SIH-lik A-sid deh-RIH-vuh-tiv)
    Pronunciation of dictionary term "nitric oxide-releasing acetylsalicylic acid derivative"
    A substance being studied in the prevention of colorectal cancer. It is a form of aspirin that gives off nitric oxide gas and is less irritating to the lining of the stomach than plain aspirin. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called NCX 4016.
  nitroarginine: (NY-troh-AR-jih-neen)
    Pronunciation of dictionary term "nitroarginine"
    A form of the amino acid arginine. An amino acid is a protein building block. Nitroarginine is being studied in the treatment of cancer and other conditions. In cancer, it may stop the growth of tumor cells by blocking certain proteins needed for tumor cells to grow and by blocking blood flow to the tumor. It is a type of nitric oxide synthase inhibitor and an antiangiogenesis agent. Also called NG-nitro-L-arginine.
  nitrocamptothecin: (NY-troh-KAMP-toh-THEH-kin)
    Pronunciation of dictionary term "nitrocamptothecin"
    An alkaloid drug belonging to a class of anticancer agents called topoisomerase inhibitors.
  nitroglycerin: (NY-troh-GLIH-seh-rin)
    Pronunciation of dictionary term "nitroglycerin"
    In medicine, a substance used as a drug to treat certain heart conditions and to widen the openings in blood vessels. Nitroglycerin is being studied as a way to help chemotherapy work better by making tumor cells more sensitive to the drugs. It is a type of vasodilator.
  nitrosamine: (ny-TROH-suh-meen)
    Pronunciation of dictionary term "nitrosamine"
    A type of chemical found in tobacco products and tobacco smoke. Nitrosamines are also found in many foods, including fish, beer, fried foods, and meats. Some nitrosamines cause cancer in laboratory animals and may increase the risk of certain types of cancer in humans.
  nitrosourea: (ny-TROH-soh-YOO-ree-uh)
    Pronunciation of dictionary term "nitrosourea"
    An anticancer drug that can cross the blood-brain barrier. Carmustine and lomustine are nitrosoureas.
  Nivestym: (NY-ves-tim)
    Pronunciation of dictionary term "Nivestym"
    A drug that contains the active ingredient filgrastim and is used to treat neutropenia (a lower-than-normal number of white blood cells), prevent infection, and prepare the blood for the collection of certain types of blood cells. Nivestym is used in patients who have certain cancers and neutropenia caused by some types of chemotherapy and in patients who have severe chronic neutropenia that is not caused by cancer treatment. It is also used before an autologous stem cell transplant. Nivestym helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  nivolumab: (nih-VOL-yoo-mab)
    Pronunciation of dictionary term "nivolumab"
    A drug that binds to the protein PD-1 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that express the protein PD-L1 or that have certain mutations (changes) in genes involved in DNA repair. Nivolumab is used alone or with other drugs to treat certain types of classic Hodgkin lymphoma, colorectal cancer, esophageal cancer, gastroesophageal junction cancer, head and neck squamous cell carcinoma, hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, melanoma, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), stomach cancer, and urothelial carcinoma (a type of bladder or urinary tract cancer). It is also being studied in the treatment of other types of cancer. Nivolumab may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Opdivo.
    More Information
    - Nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
  nivolumab and hyaluronidase: (nih-VOL-yoo-mab … HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "nivolumab and hyaluronidase"
    A combination of two drugs used alone or with other drugs to treat adults with certain types of colorectal cancer, esophageal cancer, gastric (stomach) cancer, gastroesophageal junction adenocarcinoma, hepatocellular carcinoma (a type of liver cancer), melanoma, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), squamous cell carcinoma of the head and neck, and urothelial carcinoma (a type of cancer in the bladder or urinary tract). Nivolumab binds to a protein called PD-1, which is found on some normal cells and some types of cancer cells. Nivolumab may block PD-1 and help the immune system kill cancer cells. Hyaluronidase allows nivolumab to be given by injection under the skin. Nivolumab and hyaluronidase can be given in less time than nivolumab alone, which is given as an infusion. Also called Opdivo Qvantig.
    More Information
    - Nivolumab and Hyaluronidase-nvhy (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab-and-hyaluronidase-nvhy)
  nivolumab and relatlimab: (nih-VOL-yoo-mab … reh-LAT-lih-mab)
    Pronunciation of dictionary term "nivolumab and relatlimab"
    A combination of two drugs used to treat adults and children aged 12 years or older with melanoma that has spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Nivolumab and relatlimab binds to the proteins PD-1 and LAG-3, which are found on T cells (a type of immune cell). Blocking these proteins may help the immune system kill cancer cells. The combination of nivolumab and relatlimab may work better than either drug alone. Nivolumab and relatlimab is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Opdualag.
    More Information
    - Nivolumab and Relatlimab-rmbw (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab-and-relatlimab-rmbw)
  NK cell: (… sel)
    Pronunciation of dictionary term "NK cell"
    A type of immune cell that has granules (small particles) with enzymes that can kill tumor cells or cells infected with a virus. An NK cell is a type of white blood cell. Also called natural killer cell and NK-LGL.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  NK-LGL: A type of immune cell that has granules (small particles) with enzymes that can kill tumor cells or cells infected with a virus. An NK-LGL is a type of white blood cell. Also called natural killer cell and NK cell.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  NK-LGL leukemia: (... loo-KEE-mee-uh)
    Pronunciation of dictionary term "NK-LGL leukemia"
    A type of leukemia in which large natural killer (NK) cells (a type of white blood cell) that contain granules (small particles) are found in the blood. It is a chronic disease that may last for a long time and get worse. Also called natural killer-cell large granular lymphocyte leukemia and NK-LGLL.
  NK-LGLL: A type of leukemia in which large natural killer (NK) cells (a type of white blood cell) that contain granules (small particles) are found in the blood. It is a chronic disease that may last for a long time and get worse. Also called natural killer-cell large granular lymphocyte leukemia and NK-LGL leukemia.
  NKT cell: (... sel)
    Pronunciation of dictionary term "NKT cell"
    A type of immune cell that plays an important role in the body’s first immune response to invading microorganisms. NKT cells are a type of T cell that also have certain features of natural killer (NK) cells. They can kill invading microorganisms, such as bacteria and viruses, by releasing cytokines. They can also kill certain cells, such as cancer cells, either directly or by causing other immune cells to kill them. If NKT cells become inactive, this may contribute to the development and progression of certain diseases, such as cancer. Also called natural killer T cell.
  NLPHL: A rare type of Hodgkin lymphoma (a cancer of the immune system). It is marked by the presence of lymphocyte-predominant cells, which used to be called popcorn cells. These cells are different from the typical Reed-Sternberg cells found in classic Hodgkin lymphoma. NLPHL may change into diffuse large B-cell lymphoma. Also called LPHL, lymphocyte-predominant Hodgkin lymphoma, and nodular lymphocyte-predominant Hodgkin lymphoma.
  NLST: A lung cancer screening trial sponsored by the National Cancer Institute (NCI). In the trial, low-dose spiral CT scans were compared with chest x-rays for their ability to detect lung cancer early. The trial included more than 50,000 participants who were aged 55 to 74 years, were current or former heavy smokers, and had no signs or symptoms of lung cancer. The results of the trial showed that participants who were screened with spiral CT scans had about a 20% lower risk of dying from lung cancer than those who were screened with chest x-rays. Also called National Lung Screening Trial.
    More Information
    - National Lung Screening Trial (https://www.cancer.gov/types/lung/research/nlst)
    - Lung Cancer Screening
  nM: The amount of a substance equal to a billionth of a mole (a measure of the amount of a substance). Also called nanomole.
  NMC: A rare type of cancer that forms in the respiratory tract and other places along the middle of the body, from the head to the abdomen. This includes the thymus, the area between the lungs, and the pancreas, liver, and bladder. NMC is caused when a piece of chromosome 15 containing the NUT gene breaks off and attaches to another chromosome. It is usually aggressive (fast-growing) and cannot be cured. NMC usually occurs in children and young adults. Also called NUT midline carcinoma.
    More Information
    - Childhood Midline Tract Carcinoma with NUT Gene Changes Treatment
    Midline tract carcinoma is a rare type of cancer that forms in the respiratory tract or in other places along the middle of the body, including the thymus, the area between the lungs, and the liver, pancreas, and bladder. It usually grows and spreads quickly and cannot be cured. Midline tract carcinoma usually occurs in children and young adults.
    Drawing showing areas where midline tract carcinoma may form, including the nose (nasal cavity), throat (pharynx), larynx, lung, thymus, trachea, bronchi, area between the lungs, liver, pancreas, and bladder.
  NMES: A procedure in which small electric impulses are used to stimulate muscles that are weak or paralyzed. It helps to increase muscle strength, blood circulation, and range of motion and to lessen muscle spasms. Also called NES, neuromuscular electrical stimulation, and therapeutic (subthreshold) electrical stimulation.
  NMP22: A protein found inside the nucleus of a cell. It is involved in making DNA, RNA, and proteins. It also helps control how certain genes are expressed (turned on) in a cell. NMP22 may be found in higher than normal amounts in the urine of patients with some types of cancer, including bladder cancer. Measuring the amount of NMP22 in the urine may help diagnose cancer or find out how well treatment is working. It is a type of tumor marker. Also called nuclear matrix protein 22.
  NMRI: A procedure that uses radio waves, a powerful magnet, and a computer to make a series of detailed pictures of areas inside the body. A contrast agent, such as gadolinium, may be injected into a vein to help the tissues and organs show up more clearly in the picture. NMRI may be used to help diagnose disease, plan treatment, or find out how well treatment is working. It is especially useful for imaging the brain and spinal cord, the heart and blood vessels, the bones, joints, and other soft tissues, the organs in the pelvis and abdomen, and the breast. Also called magnetic resonance imaging, MRI, and nuclear magnetic resonance imaging.
    Magnetic resonance imaging (MRI) of the abdomen. The patient lies on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    Magnetic resonance imaging (MRI) of the abdomen; drawing shows the patient on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    An MRI of the breast is a procedure that uses radio waves, a strong magnet, and a computer to create detailed pictures of the inside of the breast. A contrast dye may be injected into a vein (not shown) to make the breast tissues easier to see on the MRI pictures. An MRI may be used with other breast imaging tests to detect breast cancer or other abnormal changes in the breast. It may also be used to screen for breast cancer in some people who have a high risk of the disease. Note: The inset shows an MRI image of the insides of both breasts. Credit for inset: The Cancer Imaging Archive (TCIA).
    MRI of the breast; drawing shows a person lying face down on a narrow, padded table with their arms above their head. The person’s breasts hang down into an opening in the table. The table slides into the MRI machine, which takes detailed pictures of the inside of the breast. An inset shows an MRI image of the insides of both breasts.
  NMS: A life-threatening condition that may be caused by certain drugs used to treat mental illness, nausea, or vomiting. Symptoms include high fever, sweating, unstable blood pressure, confusion, and stiffness. Also called neuroleptic malignant syndrome.
  no treatment: (... TREET-ment)
    Pronunciation of dictionary term "no treatment"
    In a clinical trial, a control group in which the participant receives no additional interventions.
  nocebo: (noh-SEE-boh)
    Pronunciation of dictionary term "nocebo"
    A harmless substance or treatment that may cause harmful side effects or worsening of symptoms because the patient thinks or believes they may occur or expects them to occur. For example, in a clinical trial, patients who are not given an active treatment but are told what side effects the active treatment may cause may have the same side effects as the patients who are given the active treatment just because they expect them to occur.
  nocebo effect: (noh-SEE-boh eh-FEKT)
    Pronunciation of dictionary term "nocebo effect"
    A situation in which a patient develops side effects or symptoms that can occur with a drug or other therapy just because the patient believes they may occur. For example, in a clinical trial, patients who are not given an active treatment, but are told what side effects the active treatment may cause, may have the same side effects as the patients who are given the active treatment, only because they expect them to occur.
  node-negative: (node-NEH-guh-tiv)
    Pronunciation of dictionary term "node-negative"
    Cancer that has not spread to the lymph nodes.
  node-positive: (... PAH-zih-tiv)
    Pronunciation of dictionary term "node-positive"
    Cancer that has spread to the lymph nodes.
  nodular lymphocyte-predominant Hodgkin lymphoma: (NAH-juh-ler LIM-foh-site-preh-DAH-mih-nunt HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "nodular lymphocyte-predominant Hodgkin lymphoma"
    A rare type of Hodgkin lymphoma (a cancer of the immune system). It is marked by the presence of lymphocyte-predominant cells, which used to be called popcorn cells. These cells are different from the typical Reed-Sternberg cells found in classic Hodgkin lymphoma. Nodular lymphocyte-predominant Hodgkin lymphoma may change into diffuse large B-cell lymphoma. Also called LPHL, lymphocyte-predominant Hodgkin lymphoma, and NLPHL.
  nodular parenchyma: (NAH-juh-ler puh-REN-kih-muh)
    Pronunciation of dictionary term "nodular parenchyma"
    A small mass of tissue within a gland or organ that carries out the specialized functions of the gland or organ.
  nodule: (NAH-jool)
    Pronunciation of dictionary term "nodule"
    A growth or lump that may be malignant (cancer) or benign (not cancer).
  nogapendekin alfa inbakicept: (noh-GAP-en-DEH-kin AL-fuh in-BAK-ih-sept)
    Pronunciation of dictionary term "nogapendekin alfa inbakicept"
    A drug used with bacillus Calmette-Guérin (BCG) to treat adults with bladder cancer that has not invaded the muscle layers of the bladder and with carcinoma in situ. Patients may or may not have a papillary tumor (a tumor that looks like long, thin “finger-like” growths). Nogapendekin alfa inbakicept is used in patients whose cancer has not gotten better after treatment with BCG. It is given with BCG as a solution through a catheter (thin tube) that is placed into the bladder. It is also being studied in the treatment of other types of cancer. Nogapendekin alfa inbakicept binds to receptors for the protein interleukin-15 (IL-15), which is found on certain types of immune cells. This may help the immune cells kill cancer cells better than BCG alone. Nogapendekin alfa inbakicept is a type of IL-15 receptor agonist and a type of immunotherapy. Also called Anktiva.
    More Information
    - Nogapendekin Alfa Inbakicept-pmln (https://www.cancer.gov/about-cancer/treatment/drugs/nogapendekin-alfa-inbakicept-pmln)
  nolatrexed: (NOH-luh-TREK-sed)
    Pronunciation of dictionary term "nolatrexed"
    A substance that is being studied in the treatment of liver cancer. It belongs to the family of drugs called thymidylate synthase inhibitors. Also called AG337 and Thymitaq.
  nomogram: (NAH-moh-gram)
    Pronunciation of dictionary term "nomogram"
    A mathematical device or model that shows relationships between things. For example, a nomogram of height and weight measurements can be used to find the surface area of a person, without doing the math, to determine the right dose of chemotherapy. Nomograms of patient and disease characteristics can help predict the outcome of some kinds of cancer.
  non-AIDS-defining cancer: (… deh-FY-ning KAN-ser)
    Pronunciation of dictionary term "non-AIDS-defining cancer"
    A type of cancer that is more likely to occur in people who are infected with human immunodeficiency virus (HIV) than in people who are not infected. Non-AIDS-defining cancers include Hodgkin lymphoma and cancers of the mouth, throat, liver, lung, and anus. In addition to HIV infection, other factors, such as older age, infection with other viruses (such as HPV or hepatitis B or C virus), and heavy alcohol or tobacco use, may increase the risk of developing a non-AIDS-defining cancer. Also called NADC.
    More Information
    - HIV Infection and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hiv-fact-sheet)
  non-atrophic gastritis: (non-ay-TROH-fik gas-TRY-tis)
    Pronunciation of dictionary term "non-atrophic gastritis"
    A condition marked by inflammation of the inner lining of the stomach. It is usually caused by an infection with the bacterium H. pylori that continues or worsens over a long period of time. Non-atrophic gastritis can lead to atrophic gastritis (thinning of the lining of the stomach caused by long-term inflammation) and certain types of stomach cancer.
  non-cardia gastric cancer: (non-KAR-dee-uh GAS-trik KAN-ser)
    Pronunciation of dictionary term "non-cardia gastric cancer"
    A type of stomach cancer that begins in the mucous-producing cells in the inner lining of the main part of the stomach. This includes the fundus, body, antrum, and pylorus. Risk factors associated with non-cardia gastric cancer include chronic infection with the bacterium H. pylori, smoking tobacco, and consuming too much salt in the diet. Most non-cardia gastric cancers are adenocarcinomas.
    More Information
    - What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)
    - Helicobacter pylori (H. pylori) and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/h-pylori-fact-sheet)
    The stomach is an organ in the upper abdomen. It can be divided into the cardia and the non-cardia, which includes the fundus, the body, the antrum, and the pylorus. The stomach is part of the digestive system.
    Drawing of the stomach showing the cardia, the fundus, the body, the antrum, and the pylorus.
  non-endometrioid cancer: (… EN-doh-MEE-tree-oyd KAN-ser)
    Pronunciation of dictionary term "non-endometrioid cancer"
    A term used to describe certain types of cancer that form in the non-glandular tissues of the endometrium (the lining of the uterus) or ovary. Examples of non-endometrioid cancer of the endometrium or ovary include serous, clear cell, mixed, and mucinous carcinomas. Non-endometrioid cancers tend to grow and spread quickly and have a poor prognosis (chance of recovery).
  non-Hodgkin lymphoma: (non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "non-Hodgkin lymphoma"
    Any of a large group of cancers of lymphocytes (white blood cells). Non-Hodgkin lymphomas can occur at any age and are often marked by lymph nodes that are larger than normal, fever, and weight loss. There are many different types of non-Hodgkin lymphoma. These types can be divided into aggressive (fast-growing) and indolent (slow-growing) types, and they can be formed from either B-cells or T-cells. B-cell non-Hodgkin lymphomas include Burkitt lymphoma, chronic lymphocytic leukemia/small lymphocytic lymphoma (CLL/SLL), diffuse large B-cell lymphoma, follicular lymphoma, immunoblastic large cell lymphoma, precursor B-lymphoblastic lymphoma, and mantle cell lymphoma. T-cell non-Hodgkin lymphomas include mycosis fungoides, anaplastic large cell lymphoma, and precursor T-lymphoblastic lymphoma. Lymphomas that occur after bone marrow or stem cell transplantation are usually B-cell non-Hodgkin lymphomas. Prognosis and treatment depend on the stage and type of disease. Also called NHL.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  non-inferiority trial: (… in-FEER-ee-OR-ih-tee TRY-ul)
    Pronunciation of dictionary term "non-inferiority trial"
    A study that tests whether a new treatment is not worse than an active treatment it is being compared to. Non-inferiority trials are sometimes done when a placebo (an inactive treatment) cannot be used. These trials may show that a new treatment (such as a drug) is not worse than the active treatment being compared, and it may be safer and easier to take or cause fewer side effects.
  non-ionizing radiation: (non-I-uh-NY-zing RAY-dee-AY-shun)
    Pronunciation of dictionary term "non-ionizing radiation"
    A type of low-energy radiation that does not have enough energy to remove an electron (negative particle) from an atom or molecule. Non-ionizing radiation includes visible, infrared, and ultraviolet light; microwaves; radio waves; and radiofrequency energy from cell phones. Most types of non-ionizing radiation have not been found to cause cancer.
    More Information
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  non-myeloablative transplant: (non-MY-eh-loh-a-BLAY-tiv TRANZ-plant)
    Pronunciation of dictionary term "non-myeloablative transplant"
    A type of donor stem cell transplant in which a patient receives lower doses of chemotherapy and/or radiation therapy than in a standard transplant. The lower doses of anticancer therapy do not kill all of the blood-forming stem cells or all of the cancer cells in the patient's bone marrow. However, the anticancer therapy is still strong enough to suppress the patient's immune system and prevent rejection of the donor stem cells. The patient’s stem cells and those from the donor both live in the patient’s body for a time after a non-myeloablative transplant. Once the cells from the donor begin to grow and divide in the bone marrow, they replace the patient’s own bone marrow cells and destroy the remaining cancer cells. A non-myeloablative transplant may be an option for certain people who are older or who are not healthy enough to receive a standard donor stem cell transplant with high-dose chemotherapy. Also called mini-transplant and reduced-intensity transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  non-rapid eye movement sleep: (… RA-pid I MOOV-ment sleep)
    Pronunciation of dictionary term "non-rapid eye movement sleep"
    The phase of sleep that is considered the quiet or restful phase. During the three stages of non-rapid eye movement sleep, a person falls asleep and then moves from a light sleep into a deep sleep. This is when a person’s brain activity, breathing, and heart rate slow down, body temperature drops, muscles relax, and eye movements stop. Non-rapid eye movement sleep plays an important role in helping the body repair tissues, build bone and muscle, and strengthen its immune system. During normal sleep, a person goes through four to five sleep cycles that last about 90 minutes each and include both non-rapid eye movement sleep and REM sleep. Also called non-REM sleep and NREM sleep.
  non-REM sleep: (… sleep)
    Pronunciation of dictionary term "non-REM sleep"
    The phase of sleep that is considered the quiet or restful phase. During the three stages of non-REM sleep, a person falls asleep and then moves from a light sleep into a deep sleep. This is when a person’s brain activity, breathing, and heart rate slow down, body temperature drops, muscles relax, and eye movements stop. Non-REM sleep plays an important role in helping the body repair tissues, build bone and muscle, and strengthen its immune system. During normal sleep, a person goes through four to five sleep cycles that last about 90 minutes each and include both non-REM sleep and REM sleep. Also called non-rapid eye movement sleep and NREM sleep.
  non-serous epithelial ovarian cancer: (… SEER-us eh-pih-THEE-lee-ul oh-VAYR-ee-un KAN-ser)
    Pronunciation of dictionary term "non-serous epithelial ovarian cancer"
    A term that describes certain types of ovarian cancers that form in the tissue covering the ovary. The main types of non-serous epithelial ovarian cancer are clear cell carcinoma, endometroid carcinoma, and mucinous carcinoma. Each type differs as to how the cancer cells look under a microscope, the tumor markers present, how quickly the cancer cells are likely to grow and spread, and their likely response to treatment. Non-serous epithelial ovarian cancers are much less common than serous epithelial ovarian cancer.
  non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "non-small cell lung cancer"
    A group of lung cancers named for the kinds of cells found in the cancer and how the cells look under a microscope. The three main types of non-small cell lung cancer are adenocarcinoma (most common), squamous cell carcinoma, and large cell carcinoma. Non-small cell lung cancer is the most common of the two main types of lung cancer (non-small cell lung cancer and small cell lung cancer).
    More Information
    - Lung Cancer (https://www.cancer.gov/types/lung)
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  nonalcoholic fatty liver disease: (non-AL-kuh-HAW-lik FA-tee LIH-ver dih-ZEEZ)
    Pronunciation of dictionary term "nonalcoholic fatty liver disease"
    A common condition in which fat builds up in the liver of people who drink little or no alcohol. There are two types of nonalcoholic fatty liver disease, simple or nonalcoholic fatty liver (NAFL) and nonalcoholic steatohepatitis (NASH). NAFL causes little or no inflammation or damage in the liver and usually does not cause serious liver problems. NASH is the more serious type of nonalcoholic fatty liver disease. It can cause liver inflammation and damage to the cells in the liver. This may lead to cirrhosis (scarring of the liver), liver failure, or liver cancer. Nonalcoholic fatty liver disease usually affects middle-aged and older adults but is becoming more common in children and teens. It is especially common in people who are overweight or who have obesity, diabetes, or high levels of cholesterol and triglycerides (a type of fat) in the blood. Also called NAFLD.
    More Information
    - Non-alcoholic fatty liver disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/non-alcoholic-fatty-liver-disease/)
  nonalcoholic steatohepatitis: (non-AL-kuh-HAW-lik STEE-uh-toh-HEH-puh-TY-tis)
    Pronunciation of dictionary term "nonalcoholic steatohepatitis"
    A type of liver disease in which fat builds up in the liver of people who drink little or no alcohol. This causes inflammation of the liver and damage to the cells in the liver, which may lead to cirrhosis (scarring of the liver) and liver failure. People with nonalcoholic steatohepatitis are at increased risk of developing liver cancer. It is more common in middle-aged adults, especially in those who are overweight or obese or who have diabetes or high levels of cholesterol and triglycerides (a type of fat) in the blood. Also called NASH.
    More Information
    - Nonalcoholic steatohepatitis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6430/nonalcoholic-steatohepatitis)
    - Non-alcoholic fatty liver disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/non-alcoholic-fatty-liver-disease/)
  nonavalent vaccine: (NOH-nuh-VAY-lent vak-SEEN)
    Pronunciation of dictionary term "nonavalent vaccine"
    A vaccine that works by stimulating an immune response against nine different antigens, such as nine different viruses or other microorganisms. For example, Gardasil 9 is a nonavalent vaccine that helps protect the body against infection with nine different types of human papillomaviruses (HPV).
  nonblinded: (non-BLINE-ded)
    Pronunciation of dictionary term "nonblinded"
    A type of study in which both the health providers and the patients are aware of the drug or treatment being given. Also called open label study.
  noncarrier: (non-KAYR-ee-er)
    Pronunciation of dictionary term "noncarrier"
    In genetics, a person who does not have a mutated (changed) disease-causing gene that has been previously identified in his or her family.
  nonconsecutive case series: (non-kun-SEH-kyoo-tiv kays SEER-eez)
    Pronunciation of dictionary term "nonconsecutive case series"
    A clinical study that includes some, but not all, of the eligible patients identified by the researchers during the study registration period. This type of study does not usually have a control group.
  noncontiguous lymphoma: (non-kun-TIG-yoo-us lim-FOH-muh)
    Pronunciation of dictionary term "noncontiguous lymphoma"
    Lymphoma in which the lymph nodes containing cancer are not next to each other, but are on the same side of the diaphragm (the thin muscle below the lungs that helps breathing and separates the chest from the abdomen).
  nonfunctioning tumor: (non-FUNK-shuh-ning TOO-mer)
    Pronunciation of dictionary term "nonfunctioning tumor"
    A tumor that is found in endocrine tissue but does not make extra hormones. Nonfunctioning tumors usually do not cause symptoms until they grow large or spread to other parts of the body. Also called endocrine-inactive tumor.
  nongerminoma: (non-JER-mih-NOH-muh)
    Pronunciation of dictionary term "nongerminoma"
    A type of tumor that begins in germ cells (cells that form sperm or eggs). Nongerminomas can occur in the ovaries or testicles or other parts of the body, but they occur most often in the central nervous system (brain and spinal cord). This happens when a germ cell travels to the brain during fetal development and later becomes a germ cell tumor. There are several types of nongerminoma tumors, including embryonal carcinoma, yolk sac tumor, choriocarcinoma, teratoma, and mixed germ cell tumor. Most nongerminomas make hormones, such as alpha-fetoprotein (AFP) and beta-human chorionic gonadotropin (beta-hCG). Nongerminomas are usually malignant (cancer) and tend to grow and spread quickly. They usually occur in children.
  nonhematologic cancer: (non-HEE-muh-tuh-LAH-jik KAN-ser)
    Pronunciation of dictionary term "nonhematologic cancer"
    Cancer that does not begin in the blood or bone marrow.
  nonheritable: (non-HAYR-ih-tuh-bul)
    Pronunciation of dictionary term "nonheritable"
    In medicine, describes a characteristic or trait that cannot be passed from a parent to a child through the genes. Nonheritable forms of cancer may occur when there is a mutation (change) in the DNA in any of the cells of the body, except the germ cells (sperm and egg). People who have a nonheritable form of cancer do not have a family history of that cancer or an inherited change in their DNA that would increase their risk for that cancer.
  noni: (NOH-nee)
    Pronunciation of dictionary term "noni"
    Morinda citrifolia. A tropical shrub. An extract from the fruit is being studied as a treatment for cancer, and extracts from the fruit, leaves, or roots have been used in some cultures to treat other diseases. Also called Morinda citrifolia.
  noninvasive: (NON-in-VAY-siv)
    Pronunciation of dictionary term "noninvasive"
    In medicine, it describes a procedure that does not require inserting an instrument through the skin or into a body opening. In cancer, it describes disease that has not spread outside the tissue in which it began.
  noninvasive papillary carcinoma: (NON-in-VAY-siv PA-pih-LAYR-ee KAR-sih-NOH-muh)
    Pronunciation of dictionary term "noninvasive papillary carcinoma"
    A condition in which abnormal cells are found in the tissue lining the inside of the bladder, renal pelvis, or ureter. Noninvasive papillary carcinoma may look like long, thin, finger-like growths under a microscope and can be low grade or high grade, depending on how abnormal the cells look. These abnormal cells may become cancer and spread into nearby normal tissue. Noninvasive papillary carcinoma is also called stage 0a bladder cancer or stage 0a transitional cell cancer of the renal pelvis and ureter.
    More Information
    - Bladder Cancer Stages
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
    Stage 0 bladder cancer (noninvasive bladder cancer). Cancer cells are found in tissue lining the inside of the bladder but have not invaded into the bladder wall. Stage 0a (also called noninvasive papillary carcinoma) may look like long, thin growths extending into the bladder lumen (the space where urine collects). Stage 0is (also called carcinoma in situ) is a flat tumor on the tissue lining the inside of the bladder.
    Stage 0 bladder cancer (noninvasive bladder cancer); drawing shows the bladder, lumen (the space where urine collects), ureter, prostate, and urethra. The first inset shows stage 0a (also called noninvasive papillary carcinoma) on the inner lining of the bladder. The second inset shows stage 0is (also called carcinoma in situ) on the inner lining of the bladder. Also shown are the connective tissue and muscle layers of the bladder and the layer of fat around the bladder.
  nonlytic: (non-LIH-tik)
    Pronunciation of dictionary term "nonlytic"
    In biology, refers to viruses that do not kill infected cells by disrupting their plasma membranes.
  nonmalignant: (non-muh-LIG-nunt)
    Pronunciation of dictionary term "nonmalignant"
    Not cancer. Nonmalignant tumors may grow larger but do not spread to other parts of the body. Also called benign.
  nonmalignant hematologic disorder: (non-muh-LIG-nunt HEE-muh-tuh-LAH-jik dis-OR-der)
    Pronunciation of dictionary term "nonmalignant hematologic disorder"
    A disorder of the blood. Some nonmalignant hematologic disorders may lead to leukemia.
  nonmelanoma skin cancer: (non-MEH-luh-NOH-muh skin KAN-ser)
    Pronunciation of dictionary term "nonmelanoma skin cancer"
    Cancer that forms in the tissues of the epidermis (the outer layer of the skin). The two main types of nonmelanoma skin cancer are squamous cell carcinoma (SCC), which begins in thin, flat cells that form the top layer of the epidermis, and basal cell carcinoma (BCC), which begins in round cells that form the lower layer of the epidermis. SCC and BCC are the most common types of skin cancer. Nonmelanoma skin cancer can occur anywhere on the body, but it is most common in areas of the skin often exposed to sunlight, such as the face, ears, lower lip, neck, arms, and top of the hands. Also called keratinocyte carcinoma.
    More Information
    - Skin Cancer (Including Melanoma) (https://www.cancer.gov/types/skin)
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  nonmelanoma skin carcinoma in situ on the eyelid: (non-MEH-luh-NOH-muh skin KAR-sih-NOH-muh in SY-too ... I-lid)
    Pronunciation of dictionary term "nonmelanoma skin carcinoma in situ on the eyelid"
    Abnormal cells are found in the epidermis, usually in the basal cell layer. These abnormal cells may become cancer and spread into nearby normal tissue. Also called stage 0 nonmelanoma skin carcinoma in situ on the eyelid.
    More Information
    - Skin Cancer Treatment
  nonmelanoma skin carcinoma in situ on the head and neck (not on the eyelid): (non-MEH-luh-NOH-muh skin KAR-sih-NOH-muh in SY-too ...)
    Pronunciation of dictionary term "nonmelanoma skin carcinoma in situ on the head and neck (not on the eyelid)"
    Abnormal cells are found in the squamous cell or basal cell layer of the epidermis. These abnormal cells may become cancer and spread into nearby normal tissue. Also called stage 0 nonmelanoma skin carcinoma in situ on the head and neck (not on the eyelid).
    More Information
    - Skin Cancer Treatment
    Nonmelanoma skin cancer of the head and neck (carcinoma in situ). Abnormal cells are found in the squamous cell or basal cell layer of the epidermis. These abnormal cells may become cancer and spread into nearby normal tissue.
    Nonmelanoma skin cancer of the head and neck (carcinoma in situ); drawing shows abnormal squamous cells and basal cells in the epidermis. Also shown are the dermis and the subcutaneous tissue below the dermis. There are two insets: the inset on the left shows a close up of normal and abnormal squamous cells; the inset on the right shows a close up of normal and abnormal basal cells.
  nonmelanomatous: (non-MEH-luh-NOH-muh-tus)
    Pronunciation of dictionary term "nonmelanomatous"
    Having to do with skin cancer that forms in the lower part of the epidermis (the outer layer of the skin) or in squamous cells, but not in melanocytes (skin cells that make pigment).
    More Information
    - Skin Cancer (Including Melanoma) (https://www.cancer.gov/types/skin)
  nonmetastatic: (non-meh-tuh-STA-tik)
    Pronunciation of dictionary term "nonmetastatic"
    Cancer that has not spread from the primary site (place where it started) to other places in the body.
  nonopioid: (non-OH-pee-OYD)
    Pronunciation of dictionary term "nonopioid"
    A drug that is not an opioid. Examples include acetaminophen and nonsteroidal anti-inflammatory drugs (NSAIDS), such as aspirin and ibuprofen.
  nonpenetrance: (non-PEH-neh-trunts)
    Pronunciation of dictionary term "nonpenetrance"
    A term that describes when a person has a disease-causing mutation (change) in a gene but never develops the disease. For example, a woman may have a certain BRCA1 gene mutation that increases her risk of breast cancer, but because the gene mutation is nonpenetrant, she never develops breast cancer. However, she can still pass the BRCA1 gene mutation to her children, who may develop cancer.
  nonprescription: (NON-preh-SKRIP-shun)
    Pronunciation of dictionary term "nonprescription"
    Refers to a medicine that can be bought without a prescription (doctor's order). Examples include analgesics (pain relievers), such as aspirin and acetaminophen. Also called OTC and over-the-counter.
  nonrandomized clinical trial: (non-RAN-duh-mized KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "nonrandomized clinical trial"
    A clinical trial in which the participants are not assigned by chance to different treatment groups. Participants may choose which group they want to be in, or they may be assigned to the groups by the researchers.
  nonseminoma: (NON-seh-mih-NOH-muh)
    Pronunciation of dictionary term "nonseminoma"
    A type of cancer that begins in cells that form sperm or eggs. There are several types of nonseminoma tumors, including embryonal carcinoma, malignant teratoma, choriocarcinoma, and yolk sac tumor. These tumors are usually made up of more than one type of cancer cell. Although nonseminomas occur most often in the testicles or ovaries, they can occur in other tissues, such as the brain, chest, or abdomen. This happens when cells that have the ability to form sperm or eggs are found in other parts of the body.
  nonsense mutation: (NON-sens myoo-TAY-shun)
    Pronunciation of dictionary term "nonsense mutation"
    A change in the DNA sequence of a gene that signals the cell to stop making the protein before it is complete. This results in a shorter protein that may not function. Also called nonsense variant.
    More Information
    - Nonsense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Nonsense-Mutation)
  nonsense variant: (NON-sens VAYR-ee-unt)
    Pronunciation of dictionary term "nonsense variant"
    A change in the DNA sequence of a gene that signals the cell to stop making the protein before it is complete. This results in a shorter protein that may not function. Also called nonsense mutation.
    More Information
    - Nonsense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Nonsense-Mutation)
  nonspecific immune cell: (non-speh-SIH-fik ih-MYOON sel)
    Pronunciation of dictionary term "nonspecific immune cell"
    A cell (such as a phagocyte or a macrophage) that responds to many antigens, not just one antigen.
  nonspecific immune stimulation: (non-speh-SIH-fik ih-MYOON STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "nonspecific immune stimulation"
    A type of cancer therapy that works by stimulating the immune system in a general way rather than by targeting cancer cells specifically. It may also help the body fight infection and other diseases. Agents used for nonspecific immune stimulation include BCG, interferon alpha, and certain types of interleukin.
    More Information
    - Immune System Modulators (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/immune-system-modulators)
    Nonspecific Immune Stimulation
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called nonspecific immune stimulation that is used to treat cancer.
    YouTube (https://www.youtube.com/watch?v=zKgCtZ4Sz7w)
  nonspecific immunomodulating agent: (non-speh-SIH-fik IH-myoo-noh-MOD-yoo-lay-ting AY-jent)
    Pronunciation of dictionary term "nonspecific immunomodulating agent"
    A substance that stimulates or suppresses the immune system in a general way. A nonspecific immunomodulating agent may stimulate the immune system to help the body fight cancer, infection, or other conditions. Or it may suppress the immune system to help treat autoimmune diseases, such as lupus, or to help keep a person from rejecting a bone marrow or organ transplant.
    More Information
    - Immune System Modulators (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/immune-system-modulators)
    Nonspecific Immune Stimulation
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called nonspecific immune stimulation that is used to treat cancer.
    YouTube (https://www.youtube.com/watch?v=zKgCtZ4Sz7w)
  nonstarchy vegetable: (non-STAR-chee VEJ-tuh-bul)
    Pronunciation of dictionary term "nonstarchy vegetable"
    A member of the family of vegetables that does not contain starch (sugar molecules joined chemically). Nonstarchy vegetables are usually lower in sugar and higher in fiber than starchy vegetables. Examples are broccoli, carrots, celery, peppers, tomatoes, and zucchini.
  nonsteroidal anti-inflammatory drug: (NON-steh-ROY-dul AN-tee-in-FLA-muh-TOR-ee ...)
    Pronunciation of dictionary term "nonsteroidal anti-inflammatory drug"
    A drug that works in a different way than a steroid to reduce pain, redness, swelling, and fever in the body. Some nonsteroidal anti-inflammatory drugs may also help keep blood clots from forming. The side effects of nonsteroidal anti-inflammatory drugs include bleeding and stomach, kidney, and heart problems. Examples of nonsteroidal anti-inflammatory drugs are aspirin, ibuprofen, ketoprofen, celecoxib, diclofenac, and ketorolac. Nonsteroidal anti-inflammatory drugs may also help prevent some types of cancer. Also called NSAID.
  nonsteroidal aromatase inhibitor: (NON-steh-ROY-dul uh-ROH-muh-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "nonsteroidal aromatase inhibitor"
    A drug that decreases the production of sex hormones (estrogen or testosterone) and slows the growth of tumors that need sex hormones to grow.
  nontoxic: (non-TOK-sik)
    Pronunciation of dictionary term "nontoxic"
    Not harmful or destructive.
  Noonan syndrome: (NOO-nun SIN-drome)
    Pronunciation of dictionary term "Noonan syndrome"
    A genetic disorder marked by unusual facial features, being shorter than normal, learning problems, heart defects, bleeding problems, defects in the skeleton (bones of the body), and fertility problems in males. People with Noonan syndrome have an increased risk of certain types of cancer, such as rhabdomyosarcoma (a soft tissue tumor), neuroblastoma (cancer of immature nerve cells), and some types of leukemia.
    More Information
    - Noonan syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10955/noonan-syndrome)
    - Noonan syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/noonan-syndrome/)
  Noonan syndrome with multiple lentigines: (NOO-nun SIN-drome … MUL-tih-pul len-TIH-jih-neez)
    Pronunciation of dictionary term "Noonan syndrome with multiple lentigines"
    A rare genetic condition that affects many parts of the body, especially the skin, heart, inner ear, and genitals. It is marked by small, dark brown spots on the skin called lentigines, which usually appear on the face, neck, and upper body by age 4 or 5 years. The number of lentigines may increase to the thousands by puberty. Other signs and symptoms of this condition include heart defects, unusual facial features, genital abnormalities, and shorter-than-average height. People with this syndrome may also have hearing loss, an abnormally shaped chest, extra folds of skin on the back of the neck, mild learning problems, and fertility problems. Noonan syndrome with multiple lentigines is a type of disease called a RASopathy that is caused by mutations (changes) in the PTPN11, RAF1, BRAF, or MAP2K1 gene. These genes make proteins involved in a cell signaling pathway that controls many important cell functions. Noonan syndrome with multiple lentigines is sometimes called LEOPARD syndrome.
  NOP10 gene: (... jeen)
    Pronunciation of dictionary term "NOP10 gene"
    A gene that makes a protein involved in making ribosomes (protein-making structures inside cells) and in maintaining telomeres (the ends of chromosomes). Mutations (changes) in the NOP10 gene have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
  noradrenaline: (NOR-uh-dreh-nuh-lin)
    Pronunciation of dictionary term "noradrenaline"
    A chemical made by some nerve cells and in the adrenal gland. It can act as both a neurotransmitter (a chemical messenger used by nerve cells) and a hormone (a chemical that travels in the blood and controls the actions of other cells or organs). Noradrenaline is released from the adrenal gland in response to stress and low blood pressure. Also called norepinephrine.
  nordihydroguaiaretic acid: (NOR-dy-HY-droh-GWY-uh-reh-tik A-sid)
    Pronunciation of dictionary term "nordihydroguaiaretic acid"
    A drug put on the skin to treat growths caused by sun exposure. A form of nordihydroguaiaretic acid that is taken by mouth is being studied in the treatment of prostate cancer. Nordihydroguaiaretic acid is an antioxidant, and it may block certain enzymes needed for tumor growth. Also called Actinex, masoprocol, and NDGA.
  norepinephrine: (NOR-eh-pih-NEH-frin)
    Pronunciation of dictionary term "norepinephrine"
    A chemical made by some nerve cells and in the adrenal gland. It can act as both a neurotransmitter (a chemical messenger used by nerve cells) and a hormone (a chemical that travels in the blood and controls the actions of other cells or organs). Norepinephrine is released from the adrenal gland in response to stress and low blood pressure. Also called noradrenaline.
  normal Pap test result: (NOR-mul ... reh-ZULT)
    Pronunciation of dictionary term "normal Pap test result"
    A Pap test finding that means no cancer cells or other abnormal cells have been found on the surface of or in the tissue that lines the cervix. Cell changes that suggest inflammation or infection may be included in this finding. Also called negative for intraepithelial lesion or malignancy, negative Pap test result, and NILM.
  normal range: (NOR-mul raynj)
    Pronunciation of dictionary term "normal range"
    In medicine, a set of values that a doctor uses to interpret a patient’s test results. The normal range for a given test is based on the results that are seen in 95% of the healthy population. Sometimes patients whose test results are outside of the normal range may be healthy, and some patients whose test results are within the normal range may have a health problem. The normal range for a test may be different for different groups of people (for example, men and women). Also called reference interval, reference range, and reference values.
  nortriptyline: (nor-TRIP-tih-leen)
    Pronunciation of dictionary term "nortriptyline"
    A drug used to treat depression. It may also be used to treat panic or anxiety disorders and certain types of pain, and to help people quit smoking. Nortriptyline increases the levels of norepinephrine and other natural chemicals in the brain. This helps improve mood and may reduce a person’s craving for nicotine. It is a type of tricyclic antidepressant. Also called Aventyl and Pamelor.
  Norvir: (NOR-veer)
    Pronunciation of dictionary term "Norvir"
    A drug used to treat infection with HIV (the virus that causes AIDS). It is also being studied in the treatment of some types of cancer. Norvir blocks the ability of HIV to make copies of itself and may block the growth of cancer cells. It is a type of anti-HIV agent and a type of protease inhibitor. Also called ritonavir.
  notary public: (NOH-tuh-ree PUH-blik)
    Pronunciation of dictionary term "notary public"
    A person who has a license that gives them the legal power to witness the signing of documents, to certify that documents are real, and to take statements made under oath.
  novobiocin: (NOH-voh-BY-oh-sin)
    Pronunciation of dictionary term "novobiocin"
    An antibiotic drug used to treat infection.
  NP: A registered nurse who has additional education and training in how to diagnose and treat disease. NPs are licensed at the state level and certified by national nursing organizations. In cancer care, an NP may manage the primary care of patients and their families, based on a practice agreement with a doctor. Also called advanced practice nurse, APN, and nurse practitioner.
  Nplate: (EN-playt)
    Pronunciation of dictionary term "Nplate"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults and in certain children with immune thrombocytopenic purpura that did not get better with other treatment. It is also being studied in the treatment of other conditions and types of cancer. Nplate binds to the thrombopoietin receptor, which causes the bone marrow to make more platelets. It is a type of thrombopoietin receptor agonist. Also called AMG 531 and romiplostim.
    More Information
    - Romiplostim (https://www.cancer.gov/about-cancer/treatment/drugs/romiplostim)
  NPO: A Latin abbreviation for “nothing by mouth.”
  NPV: The likelihood that a person who has a negative test result indeed does not have the disease, condition, biomarker, or mutation (change) in the gene being tested. The NPV is a way of measuring how accurate a specific test is. Also called negative predictive value.
  NR-LU-10 antigen: (... AN-tih-jen)
    Pronunciation of dictionary term "NR-LU-10 antigen"
    A protein found on the surface of some cancers.
  NREM sleep: (... sleep)
    Pronunciation of dictionary term "NREM sleep"
    The phase of sleep that is considered the quiet or restful phase. During the three stages of NREM sleep, a person falls asleep and then moves from a light sleep into a deep sleep. This is when a person’s brain activity, breathing, and heart rate slow down, body temperature drops, muscles relax, and eye movements stop. NREM sleep plays an important role in helping the body repair tissues, build bone and muscle, and strengthen its immune system. During normal sleep, a person goes through four to five sleep cycles that last about 90 minutes each and include both NREM sleep and REM sleep. Also called non-rapid eye movement sleep and non-REM sleep.
  Nrf2: A protein that controls how certain genes are expressed. These genes help protect the cell from damage caused by free radicals (unstable molecules made during normal cell metabolism). Free radicals may play a part in cancer, heart disease, stroke, and other diseases of aging. Also called NFE2L2 and nuclear factor (erythroid-derived 2)-like 2.
  NSAID: A drug that works in a different way than a steroid to reduce pain, redness, swelling, and fever in the body. Some NSAIDs may also help keep blood clots from forming. The side effects of NSAIDs include bleeding and stomach, kidney, and heart problems. Examples of NSAIDs are aspirin, ibuprofen, ketoprofen, celecoxib, diclofenac, and ketorolac. NSAIDs may also help prevent some types of cancer. Also called nonsteroidal anti-inflammatory drug.
  NSC 655649: A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called antitumor antibiotics and topoisomerase inhibitors. Also called rebeccamycin analog.
  NTHL1 gene: (… jeen)
    Pronunciation of dictionary term "NTHL1 gene"
    A gene that makes a protein involved in the repair of DNA damage. Mutations (changes) in the NTHL1 gene may keep cells from repairing their damaged DNA, which may cause cancer cells to grow. The mutated NTHL1 gene has been found in some patients with an inherited condition called familial adenomatous polyposis 3 (FAP3). FAP3 causes many polyps (abnormal growths) to form on the inner walls of the colon and rectum, which may lead to colorectal cancer. People who have mutations in NTHL1 may also be at increased risk of developing other types of cancer, including endometrial, small intestine, skin, breast, and pancreatic cancers.
  NTRK gene fusion: (… jeen FYOO-zhun)
    Pronunciation of dictionary term "NTRK gene fusion"
    A mutation (change) that occurs when a piece of the chromosome containing a gene called NTRK breaks off and joins with a gene on another chromosome. NTRK gene fusions lead to abnormal proteins called TRK fusion proteins, which may cause cancer cells to grow. NTRK gene fusions may be found in some types of cancer, including cancers of the brain, head and neck, thyroid, soft tissue, lung, and colon. Also called neurotrophic tyrosine receptor kinase gene fusion.
  NTX-010: A virus being studied in the treatment of neuroendocrine tumors and other types of cancer. Neuroendocrine tumors form from cells that release hormones in response to a signal from the nervous system. The virus infects and breaks down these tumor cells but not normal cells. It is a type of oncolytic virus. Also called Seneca Valley virus-001 and SVV-001.
  Nubeqa: (NOO-beh-kuh)
    Pronunciation of dictionary term "Nubeqa"
    A drug used alone or with docetaxel to treat adults with certain types of prostate cancer. Nubeqa is used in patients whose cancer has spread to other parts of the body and responds to treatment that lowers testosterone levels or whose cancer has not spread to other parts of the body and no longer responds to treatment that lowers testosterone levels. It is also being studied in the treatment of other types of cancer. Nubeqa binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Nubeqa blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called darolutamide.
    More Information
    - Darolutamide (https://www.cancer.gov/about-cancer/treatment/drugs/darolutamide)
  nuclear factor (erythroid-derived 2)-like 2: (NOO-klee-er FAK-ter eh-RITH-royd-deh-RIVED …)
    Pronunciation of dictionary term "nuclear factor (erythroid-derived 2)-like 2"
    A protein that controls how certain genes are expressed. These genes help protect the cell from damage caused by free radicals (unstable molecules made during normal cell metabolism). Free radicals may play a part in cancer, heart disease, stroke, and other diseases of aging. Also called NFE2L2 and Nrf2.
  nuclear factor-kappa B: (NOO-klee-er FAK-ter-KA-puh …)
    Pronunciation of dictionary term "nuclear factor-kappa B"
    A group of proteins that help control many functions in a cell, including cell growth and survival. These proteins also control the body’s immune and inflammatory responses. Nuclear factor-kappa B may be overactive or found in higher than normal amounts in some types of cancer cells. This may lead to cancer cell growth. High levels or overactivity of nuclear factor-kappa B may also lead to inflammatory disorders, such as asthma and ulcerative colitis, and autoimmune disorders, such as rheumatoid arthritis. Also called NF-kappa B and NF-kB.
  nuclear grade: (NOO-klee-er grayd)
    Pronunciation of dictionary term "nuclear grade"
    An evaluation of the size and shape of the nucleus in tumor cells and the percentage of tumor cells that are in the process of dividing or growing. Cancers with low nuclear grade grow and spread less quickly than cancers with high nuclear grade.
  nuclear magnetic resonance imaging: (NOO-klee-er mag-NEH-tik REH-zuh-nunts IH-muh-jing)
    Pronunciation of dictionary term "nuclear magnetic resonance imaging"
    A procedure that uses radio waves, a powerful magnet, and a computer to make a series of detailed pictures of areas inside the body. A contrast agent, such as gadolinium, may be injected into a vein to help the tissues and organs show up more clearly in the picture. Nuclear magnetic resonance imaging may be used to help diagnose disease, plan treatment, or find out how well treatment is working. It is especially useful for imaging the brain and spinal cord, the heart and blood vessels, the bones, joints, and other soft tissues, the organs in the pelvis and abdomen, and the breast. Also called magnetic resonance imaging, MRI, and NMRI.
    Magnetic resonance imaging (MRI) of the abdomen. The patient lies on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    Magnetic resonance imaging (MRI) of the abdomen; drawing shows the patient on a table that slides into the MRI machine, which takes pictures of the inside of the body. The pad on the patient’s abdomen helps make the pictures clearer.
    An MRI of the breast is a procedure that uses radio waves, a strong magnet, and a computer to create detailed pictures of the inside of the breast. A contrast dye may be injected into a vein (not shown) to make the breast tissues easier to see on the MRI pictures. An MRI may be used with other breast imaging tests to detect breast cancer or other abnormal changes in the breast. It may also be used to screen for breast cancer in some people who have a high risk of the disease. Note: The inset shows an MRI image of the insides of both breasts. Credit for inset: The Cancer Imaging Archive (TCIA).
    MRI of the breast; drawing shows a person lying face down on a narrow, padded table with their arms above their head. The person’s breasts hang down into an opening in the table. The table slides into the MRI machine, which takes detailed pictures of the inside of the breast. An inset shows an MRI image of the insides of both breasts.
  nuclear matrix protein 22: (NOO-klee-er MAY-trix PROH-teen …)
    Pronunciation of dictionary term "nuclear matrix protein 22"
    A protein found inside the nucleus of a cell. It is involved in making DNA, RNA, and proteins. It also helps control how certain genes are expressed (turned on) in a cell. Nuclear matrix protein 22 may be found in higher than normal amounts in the urine of patients with some types of cancer, including bladder cancer. Measuring the amount of nuclear matrix protein 22 in the urine may help diagnose cancer or find out how well treatment is working. It is a type of tumor marker. Also called NMP22.
  nuclear medicine: (NOO-klee-er MEH-dih-sin)
    Pronunciation of dictionary term "nuclear medicine"
    A branch of medicine that uses small amounts of radioactive substances to make pictures of areas inside the body and to treat disease. In cancer, the radioactive substance may be used with a special machine (such as a PET scanner) to find the cancer, to see how far it has spread, or to see how well a treatment is working. Radioactive substances may also be used to treat certain types of cancer, such as thyroid cancer and lymphoma.
  nuclear medicine scan: (NOO-klee-er MEH-dih-sin skan)
    Pronunciation of dictionary term "nuclear medicine scan"
    A method that uses radioactive substances to make pictures of areas inside the body. The radioactive substance is injected into the body, and locates and binds to specific cells or tissues, including cancer cells. Images are made using a special machine that detects the radioactive substance. Also called radioimaging.
  nucleolus: (noo-KLEE-uh-lus)
    Pronunciation of dictionary term "nucleolus"
    An area inside the nucleus of a cell that is made up of RNA and proteins and is where ribosomes are made. Ribosomes help link amino acids together to form proteins. The nucleolus is a cell organelle.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  nucleotide: (NOO-klee-oh-tide)
    Pronunciation of dictionary term "nucleotide"
    A building block for nucleic acids (the molecules inside cells that carry genetic information). Nucleotides are attached end-to-end to form the nucleic acids DNA and RNA.
    More Information
    - Nucleotide (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Nucleotide)
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  nucleus: (NOO-klee-us)
    Pronunciation of dictionary term "nucleus"
    In biology, the structure in a cell that contains the chromosomes. The nucleus has a membrane around it, and is where RNA is made from the DNA in the chromosomes.
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  Nucynta: (noo-SIN-tuh)
    Pronunciation of dictionary term "Nucynta"
    A drug used to treat moderate to severe pain. It binds to opioid receptors and other molecules in the central nervous system. Nucynta is a type of opioid and a type of analgesic agent. Also called tapentadol hydrochloride.
  Numorphan: (noo-MOR-fan)
    Pronunciation of dictionary term "Numorphan"
    A drug used to treat moderate to severe pain. It is also used as a sedative before surgery, to help with anesthesia during surgery, during labor, and to treat anxiety caused by some medical conditions. It is made from morphine and binds to opioid receptors in the central nervous system. Numorphan is a type of opioid and a type of analgesic agent. Also called Opana and oxymorphone hydrochloride.
  nurse: (nurs)
    Pronunciation of dictionary term "nurse"
    A health professional trained to care for people who are ill or disabled.
  nurse case manager: (... MA-nih-jer)
    Pronunciation of dictionary term "nurse case manager"
    A registered nurse who has special training in how to plan, manage, and evaluate all aspects of patient care, especially for patients who get treatment over a long time. Also called case management nurse.
  nurse practitioner: (… prak-TIH-shuh-ner)
    Pronunciation of dictionary term "nurse practitioner"
    A registered nurse who has additional education and training in how to diagnose and treat disease. Nurse practitioners are licensed at the state level and certified by national nursing organizations. In cancer care, a nurse practitioner may manage the primary care of patients and their families, based on a practice agreement with a doctor. Also called advanced practice nurse, APN, and NP.
  nursing: (NUR-sing)
    Pronunciation of dictionary term "nursing"
    The act of feeding breast milk to an infant. Babies can be fed directly from the mother’s breast, or breast milk can be pumped and then fed to the baby from a bottle. Breast milk contains calories, vitamins, minerals, and other important nutrients that help an infant grow and develop. It also contains antibodies, which help protect the infant against some infections. Nursing also helps protect the infant and mother against certain diseases or conditions. Also called breastfeeding.
  nursing home: (NUR-sing home)
    Pronunciation of dictionary term "nursing home"
    A place that gives care to people who have physical or mental disabilities and need help with activities of daily living (such as taking a bath, getting dressed, and going to the bathroom) but do not need to be in the hospital.
  NUT carcinoma: (… KAR-sih-NOH-muh)
    Pronunciation of dictionary term "NUT carcinoma"
    A rare type of cancer that forms in the respiratory tract and other places along the middle of the body, from the head to the abdomen. This includes the thymus, the area between the lungs, and the pancreas, liver, and bladder. NUT carcinoma is caused when a piece of chromosome 15 containing the NUT gene breaks off and attaches to another chromosome. It is usually aggressive (fast-growing) and cannot be cured. NUT carcinoma usually occurs in children and young adults.
    More Information
    - Childhood NUT Carcinoma
    NUT carcinoma is a rare type of cancer that forms in the respiratory tract or in other places along the middle of the body, including the thymus, the area between the lungs, and the liver, pancreas, and bladder. It usually grows and spreads quickly and cannot be cured. NUT carcinoma usually occurs in children and young adults.
    Drawing showing areas where NUT carcinoma may form, including the nose (nasal cavity), throat (pharynx), larynx, lung, thymus, trachea, bronchi, area between the lungs, liver, pancreas, and bladder.
  NUT gene: (… jeen)
    Pronunciation of dictionary term "NUT gene"
    A gene that causes a rare type of cancer called NUT midline carcinoma, when it is mutated (changed). The mutation occurs when a piece of the chromosome containing the NUT gene breaks off and attaches to another chromosome. In its natural, unchanged form, the NUT gene codes for a protein found in germ cells (reproductive cells) in the testicles and ovaries.
  nutraceutical: (noo-truh-SOO-tih-kul)
    Pronunciation of dictionary term "nutraceutical"
    A food or dietary supplement that is believed to provide health benefits.
  nutrient: (NOO-tree-ent)
    Pronunciation of dictionary term "nutrient"
    A chemical compound (such as protein, fat, carbohydrate, vitamin, or mineral) contained in foods. These compounds are used by the body to function and grow.
  nutrient-dense food: (NOO-tree-ent-dents …)
    Pronunciation of dictionary term "nutrient-dense food"
    Food that is high in nutrients but relatively low in calories. Nutrient-dense foods contain vitamins, minerals, complex carbohydrates, lean protein, and healthy fats. Examples of nutrient-dense foods include fruits and vegetables, whole grains, low-fat or fat-free milk products, seafood, lean meats, eggs, peas, beans, and nuts.
  nutrigenomics: (NOO-trih-jeh-NOH-mix)
    Pronunciation of dictionary term "nutrigenomics"
    The study of how food affects a person’s genes and how a person’s genes affect the way the body responds to food. Nutrigenomics is used to learn more about how genes and diet together may affect a person’s health and risk of developing diseases, such as cancer. It may also help find new ways to prevent and treat disease.
  nutrition: (noo-TRIH-shun)
    Pronunciation of dictionary term "nutrition"
    The taking in and use of food and other nourishing material by the body. Nutrition is a 3-part process. First, food or drink is consumed. Second, the body breaks down the food or drink into nutrients. Third, the nutrients travel through the bloodstream to different parts of the body where they are used as "fuel" and for many other purposes. To give the body proper nutrition, a person has to eat and drink enough of the foods that contain key nutrients.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
    - Obesity (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity)
  nutrition therapy: (noo-TRIH-shun THAYR-uh-pee)
    Pronunciation of dictionary term "nutrition therapy"
    A nutrition-based treatment plan to help manage or treat certain health conditions. These include diabetes, heart disease, kidney disease, digestive system problems, overweight, obesity, malnutrition, and cancer. Nutrition therapy includes assessing a person’s nutrition status, identifying their nutritional and dietary needs and goals, and developing a nutrition care plan. The nutrition care plan may involve changes in a person’s diet, counseling to support behavioral and lifestyle changes, or receiving nutrients through intravenous or tube feeding. Also called medical nutrition therapy.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  nutritional counseling: (noo-TRIH-shuh-nul KOWN-suh-ling)
    Pronunciation of dictionary term "nutritional counseling"
    A process by which a health professional with special training in nutrition helps people make healthy food choices and form healthy eating habits. In cancer treatment, the goal of nutritional counseling is to help patients stay healthy during and after treatment and to stay strong enough to fight infections and the recurrence of disease. Also called dietary counseling.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  nutritional status: (noo-TRIH-shuh-nul STA-tus)
    Pronunciation of dictionary term "nutritional status"
    The state of a person’s health in terms of the nutrients in his or her diet.
  nutritional supplement: (noo-TRIH-shuh-nul SUH-pleh-ment)
    Pronunciation of dictionary term "nutritional supplement"
    A product that is added to the diet. A nutritional supplement is taken by mouth and usually contains one or more dietary ingredients. Examples of dietary ingredients include vitamins, minerals, herbs, amino acids, and enzymes. A person should talk with their health care provider before taking nutritional supplements, as some may have side effects or interact with other nutritional supplements and medicines. Also called dietary supplement.
    More Information
    - Cancer Therapy Interactions With Foods and Dietary Supplements
    - FDA 101: Dietary Supplements (https://www.fda.gov/consumers/consumer-updates/fda-101-dietary-supplements)
  nutritionist: (noo-TRIH-shuh-nist)
    Pronunciation of dictionary term "nutritionist"
    A person who gives advice about healthy eating and lifestyle choices. Training and qualifications for nutritionists can vary, with some having formal education in nutrition, while others might not. Nutritionists may provide dietary counseling, meal planning, and nutrition education. A certified nutrition specialist is a nutrition expert with an advanced degree in nutrition or a related field who has passed a certification exam. Certified nutrition specialists are qualified to provide specialized nutrition advice to people who have certain medical conditions, such as obesity, high blood pressure, or diabetes, and medical nutrition therapy for managing and treating many health conditions.
  Nuvigil: (NOO-vih-jil)
    Pronunciation of dictionary term "Nuvigil"
    A drug that is used to treat certain sleep disorders, such as narcolepsy. It makes patients feel more alert and awake. It is also being studied in the treatment of insomnia and fatigue in patients treated for cancer. Nuvigil acts in a part of the brain that controls sleep and wakefulness. It is a type of wakefulness-promoting agent. Also called armodafinil.
  nystatin: (ny-STA-tin)
    Pronunciation of dictionary term "nystatin"
    The active ingredient in a drug used to treat infections caused by fungi (a type of microorganism). Nystatin is made by certain strains of bacteria and kills fungi by binding to their membranes. It is a type of antifungal agent.
  Nyvepria: (ny-VEP-ree-ah)
    Pronunciation of dictionary term "Nyvepria"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Nyvepria helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called filgrastim-SD/01, Fulphila, Neulasta, pegfilgrastim, Udenyca, and Ziextenzo.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  O(6)-benzylguanine: (… BEN-zul-GWAH-neen)
    Pronunciation of dictionary term "O(6)-benzylguanine"
    A drug that may improve the response of cancer cells to chemotherapy.
  oat cell cancer: (... sel KAN-ser)
    Pronunciation of dictionary term "oat cell cancer"
    A fast-growing type of cancer that usually occurs in the lungs but may also occur in many other parts of the body, such as the cervix, ovary, bladder, prostate, liver, pancreas, and stomach. These cancer cells usually look like small, oval-shaped oats when viewed under a microscope. Oat cell cancer tends to spread quickly to other parts of the body and usually has a poor prognosis (chance of recovery). Also called small cell carcinoma.
  ob/gyn: A branch of medicine that specializes in the care of women during pregnancy and childbirth and in the diagnosis and treatment of diseases of the female reproductive organs. It also specializes in other women’s health issues, such as menopause, hormone problems, contraception (birth control), and infertility. Also called obstetrics and gynecology.
  obatoclax: (oh-BA-toh-klax)
    Pronunciation of dictionary term "obatoclax"
    A substance being studied in the treatment of several types of cancer. Obatoclax blocks the actions of certain proteins that cells need to live and it may kill cancer cells. It is a type of apoptosis inducer, a BCL2 protein antagonist, and a BH3 mimetic.
  obatoclax mesylate: (oh-BA-toh-klax MEH-zih-layt)
    Pronunciation of dictionary term "obatoclax mesylate"
    A substance being studied in the treatment of several types of cancer. It is a form of obatoclax, which blocks the activity of certain proteins needed for cells to live and may cause tumor cells to die. It is a type of apoptosis inducer.
  obecabtagene autoleucel: (OH-beh-KAB-tuh-jeen AW-toh-LOO-sel)
    Pronunciation of dictionary term "obecabtagene autoleucel"
    A drug used to treat adults with acute lymphoblastic leukemia that came back or did not get better during or after other treatment. It is also being studied in the treatment of other conditions and types of cancer. Obecabtagene autoleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Obecabtagene autoleucel binds to a protein called CD19, which is found on some leukemia cells. This helps the body’s immune system kill cancer cells. Obecabtagene autoleucel is a type of CAR T-cell therapy. Also called Aucatzyl.
    More Information
    - Obecabtagene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/obecabtagene-autoleucel)
  obese: (oh-BEES)
    Pronunciation of dictionary term "obese"
    Having an abnormally high, unhealthy amount of body fat.
    More Information
    - Obesity (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity)
  obesity: (oh-BEE-sih-tee)
    Pronunciation of dictionary term "obesity"
    A common, chronic disease marked by an abnormally high, unhealthy amount of body fat. Having obesity can lead to many health problems, including heart disease, stroke, high blood pressure, diabetes, sleep apnea, arthritis, kidney disease, and certain types of cancer.
    More Information
    - Obesity (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity)
  obinutuzumab: (OH-bin-yoo-TOO-zoo-mab)
    Pronunciation of dictionary term "obinutuzumab"
    A drug used with other drugs to treat certain types of follicular lymphoma and chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. Obinutuzumab binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of leukemia and lymphoma cells. Obinutuzumab may block CD20 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Gazyva.
    More Information
    - Obinutuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/obinutuzumab)
  objective improvement: (ub-JEK-tiv im-PROOV-ment)
    Pronunciation of dictionary term "objective improvement"
    An improvement that can be measured by the health care provider (for example, when a tumor shrinks or there are fewer cancer cells in the blood).
  objective response: (ub-JEK-tiv reh-SPONTS)
    Pronunciation of dictionary term "objective response"
    A measurable response.
  objective response rate: (ub-JEK-tiv reh-SPONTS rayt)
    Pronunciation of dictionary term "objective response rate"
    The percentage of people in a study or treatment group who have a partial response or complete response to the treatment within a certain period of time. A partial response is a decrease in the size of a tumor or in the amount of cancer in the body, and a complete response is the disappearance of all signs of cancer in the body. In a clinical trial, measuring the objective response rate is one way to see how well a new treatment works. Also called ORR.
  oblimersen sodium: (oh-blih-MER-sen SOH-dee-um)
    Pronunciation of dictionary term "oblimersen sodium"
    A substance being studied in the treatment of cancer. It may kill cancer cells by blocking the production of a protein that makes cancer cells live longer and by making them more sensitive to anticancer drugs. It is a type of antisense oligodeoxyribonucleotide. Also called augmerosen, bcl-2 antisense oligodeoxynucleotide G3139, and Genasense.
  observation: (OB-ser-VAY-shun)
    Pronunciation of dictionary term "observation"
    In medicine, watching a patient’s condition but not giving treatment unless symptoms appear or change.
  observational study: (OB-ser-VAY-shuh-nul STUH-dee)
    Pronunciation of dictionary term "observational study"
    A type of study in which individuals are observed or certain outcomes are measured. No attempt is made to affect the outcome (for example, no treatment is given).
  obsessive-compulsive disorder: (ob-SEH-siv-kum-PUL-siv dis-OR-der)
    Pronunciation of dictionary term "obsessive-compulsive disorder"
    An anxiety disorder in which a person has intrusive ideas, thoughts, or images that occur repeatedly, and in which he or she feels driven to perform certain behaviors over and over again. For example, a person may worry all the time about germs and so will wash his or her hands over and over again. Having an obsessive-compulsive disorder may cause a person to have trouble carrying out daily activities.
  obstetrician: (OB-steh-TRIH-shun)
    Pronunciation of dictionary term "obstetrician"
    A doctor who specializes in caring for women during pregnancy and childbirth. Obstetricians also care for the fetus (unborn baby), treat problems with pregnancy, and deliver babies.
  obstetrics and gynecology: (ob-STEH-trix ... GY-neh-KAH-loh-jee)
    Pronunciation of dictionary term "obstetrics and gynecology"
    A branch of medicine that specializes in the care of women during pregnancy and childbirth and in the diagnosis and treatment of diseases of the female reproductive organs. It also specializes in other women’s health issues, such as menopause, hormone problems, contraception (birth control), and infertility. Also called ob/gyn.
  obstruction: (ub-STRUK-shun)
    Pronunciation of dictionary term "obstruction"
    Blockage of a passageway.
  obtundation: (ob-tun-DAY-shun)
    Pronunciation of dictionary term "obtundation"
    A dulled or reduced level of alertness or consciousness.
  OCA: A group of rare, inherited disorders in which the skin, hair, and eyes have little or no melanin (pigment). Most people with these disorders have very pale skin, white or light-colored hair, and light-colored eyes. People with OCA can also have vision problems, including blurry vision, rapid eye movement, crossed eyes, and increased sensitivity to light. People with these disorders have a high risk of developing squamous cell skin cancer at a very early age. The seven types of OCA are caused by mutations (changes) in the TYR, OCA2, TYRP1, SLC45A2, OCA5, SLC24A5, or C10orf11 gene. These genes are involved in making melanin. The amount of skin, hair, and eye pigment seen in each OCA type depends on the gene and mutation involved. Also called oculocutaneous albinism.
    More Information
    - Oculocutaneous albinism (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10958/oculocutaneous-albinism)
    - Oculocutaneous albinism (MedlinePlus) (https://medlineplus.gov/genetics/condition/oculocutaneous-albinism/)
  OCA2 gene: (... jeen)
    Pronunciation of dictionary term "OCA2 gene"
    A gene that makes a protein thought to be involved in making melanin (a pigment that gives color to the skin, hair, and eyes). Mutations (changes) in the OCA2 gene have been found in an inherited condition called oculocutaneous albinism. People with this condition have very pale skin and light-colored hair and eyes. They also have a high risk of developing skin cancer at an early age.
    More Information
    - OCA2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/oca2/)
  occult primary tumor: (uh-KULT PRY-mayr-ee TOO-mer)
    Pronunciation of dictionary term "occult primary tumor"
    Cancer in which the site of the primary (original) tumor cannot be found. Most metastases from occult primary tumors are found in the head and neck.
  occult stage non-small cell lung cancer: (uh-KULT ... sel lung KAN-ser)
    Pronunciation of dictionary term "occult stage non-small cell lung cancer"
    Cancer cannot be seen by imaging or bronchoscopy. Cancer cells are found in sputum or bronchial washings (a sample of cells taken from inside the airways that lead to the lungs). Cancer may have spread to other parts of the body.
    More Information
    - Non-Small Cell Lung Cancer Treatment
  occupational therapist: (AH-kyoo-PAY-shuh-nul THAYR-uh-pist)
    Pronunciation of dictionary term "occupational therapist"
    A health professional trained to help people who are ill or disabled learn to manage their daily activities.
  OCT: A procedure that uses infrared light waves to give three-dimensional (3-D) pictures of structures inside tissues and organs. The pictures are made by a computer linked to the light source. Also called optical coherence tomography.
  octreotide: (ok-TREE-oh-tide)
    Pronunciation of dictionary term "octreotide"
    A drug similar to the naturally occurring growth hormone inhibitor somatostatin. Octreotide is used to treat diarrhea and flushing associated with certain types of tumors.
  octreotide scan: (ok-TREE-oh-tide skan)
    Pronunciation of dictionary term "octreotide scan"
    A type of radionuclide scan used to find carcinoid and other types of tumors. Radioactive octreotide, a drug similar to somatostatin, is injected into a vein and travels through the bloodstream. The radioactive octreotide attaches to tumor cells that have receptors for somatostatin. A radiation-measuring device detects the radioactive octreotide, and makes pictures showing where the tumor cells are in the body. Also called somatostatin receptor scintigraphy and SRS.
  oculocutaneous albinism: (AH-kyoo-loh-kyoo-TAY-nee-us AL-bih-NIH-zum)
    Pronunciation of dictionary term "oculocutaneous albinism"
    A group of rare, inherited disorders in which the skin, hair, and eyes have little or no melanin (pigment). Most people with these disorders have very pale skin, white or light-colored hair, and light-colored eyes. People with oculocutaneous albinism can also have vision problems, including blurry vision, rapid eye movement, crossed eyes, and increased sensitivity to light. People with these disorders have a high risk of developing squamous cell skin cancer at a very early age. The seven types of oculocutaneous albinism are caused by mutations (changes) in the TYR, OCA2, TYRP1, SLC45A2, OCA5, SLC24A5, or C10orf11 gene. These genes are involved in making melanin. The amount of skin, hair, and eye pigment seen in each oculocutaneous albinism type depends on the gene and mutation involved. Also called OCA.
    More Information
    - Oculocutaneous albinism (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10958/oculocutaneous-albinism)
    - Oculocutaneous albinism (MedlinePlus) (https://medlineplus.gov/genetics/condition/oculocutaneous-albinism/)
  oculodermal melanocytosis: (AH-kyoo-loh-DER-mul meh-LAN-oh-sy-TOH-sis)
    Pronunciation of dictionary term "oculodermal melanocytosis"
    A condition marked by brown, blue, or gray patches, usually on the inside of the eye and on the skin near or around the eye. It may also affect the eyelid and mouth. It is caused by an increase in the number of cells called melanocytes in skin and eye tissue. Melanocytes make a substance called melanin, which gives color to skin and eyes. Having oculodermal melanocytosis may increase the risk of glaucoma and a type of eye cancer called intraocular melanoma. Also called nevus of Ota.
  odds ratio: (… RAY-shee-oh)
    Pronunciation of dictionary term "odds ratio"
    A measure of the odds of an event happening in one group compared to the odds of the same event happening in another group. In cancer research, odds ratios are most often used in case-control (backward looking) studies to find out if being exposed to a certain substance or other factor increases the risk of cancer. For example, researchers may study a group of individuals with cancer (cases) and another group without cancer (controls) to see how many people in each group were exposed to a certain substance or factor. They calculate the odds of exposure in both groups and then compare the odds. An odds ratio of one means that both groups had the same odds of exposure and, therefore, the exposure probably does not increase the risk of cancer. An odds ratio of greater than one means that the exposure may increase the risk of cancer, and an odds ratio of less than one means that the exposure may reduce the risk of cancer. Also called relative odds.
  Odomzo: (oh-DOM-zoh)
    Pronunciation of dictionary term "Odomzo"
    A drug used to treat locally advanced basal cell carcinoma (BCC) that has come back after surgery or radiation therapy. It is also used in patients who cannot be treated with surgery or radiation therapy. Odomzo is also being studied in the treatment of other types of cancer. Odomzo blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of hedgehog signaling pathway antagonist. Also called erismodegib, LDE225, and sonidegib phosphate.
    More Information
    - Sonidegib (https://www.cancer.gov/about-cancer/treatment/drugs/sonidegib)
  odor: (OH-der)
    Pronunciation of dictionary term "odor"
    A smell.
  odorant: (OH-deh-runt)
    Pronunciation of dictionary term "odorant"
    A substance that gives off a smell.
  OED: The presence of abnormal cells in the tissues of the mouth. These tissues include the lips, the lining of the inside of the cheeks, the gums, the front two thirds of the tongue, the bottom of the mouth under the tongue, the bony part of the roof of the mouth, and the small area behind the wisdom teeth. OED may be found in patches of tissue that look red, white, or a mixture of both colors but can only be diagnosed by looking at the cells under a microscope. It is most commonly caused by tobacco or alcohol use. It may also be caused by infection with certain types of human papillomavirus (HPV). OED is not cancer but may become cancer and spread to nearby normal tissue. It can be mild, moderate, or severe, depending on how abnormal the cells look under a microscope and how much of the tissues in the mouth are affected. Also called oral dysplasia and oral epithelial dysplasia.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  OEPA: An abbreviation for a chemotherapy combination that is often used with radiation therapy to treat a certain type of childhood Hodgkin lymphoma in males. It includes the drugs vincristine sulfate (Oncovin), etoposide, prednisone, and doxorubicin hydrochloride (Adriamycin). Also called OEPA regimen.
  OEPA regimen: (… REH-jih-men)
    Pronunciation of dictionary term "OEPA regimen"
    An abbreviation for a chemotherapy combination that is often used with radiation therapy to treat a certain type of childhood Hodgkin lymphoma in males. It includes the drugs vincristine sulfate (Oncovin), etoposide, prednisone, and doxorubicin hydrochloride (Adriamycin). Also called OEPA.
  ofatumumab: (OH-fa-TOO-moo-mab)
    Pronunciation of dictionary term "ofatumumab"
    A drug used alone or with other drugs to treat certain types of chronic lymphocytic leukemia. It is also being studied in the treatment of other types of cancer. Ofatumumab binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of leukemia and lymphoma cells. Ofatumumab may block CD20 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Arzerra and HuMax-CD20.
    More Information
    - Ofatumumab (https://www.cancer.gov/about-cancer/treatment/drugs/ofatumumab)
  OFF: An abbreviation for a chemotherapy combination used to treat pancreatic cancer. It includes the drugs oxaliplatin, fluorouracil, and leucovorin (folinic acid). Also called OFF regimen.
    More Information
    - OFF (https://www.cancer.gov/about-cancer/treatment/drugs/OFF)
  OFF regimen: (… REH-jih-men)
    Pronunciation of dictionary term "OFF regimen"
    An abbreviation for a chemotherapy combination used to treat pancreatic cancer. It includes the drugs oxaliplatin, fluorouracil, and leucovorin (folinic acid). Also called OFF.
    More Information
    - OFF (https://www.cancer.gov/about-cancer/treatment/drugs/OFF)
  off-label: (... LAY-bel)
    Pronunciation of dictionary term "off-label"
    Describes the legal use of a prescription drug to treat a disease or condition for which the drug has not been approved by the U.S. Food and Drug Administration.
  off-target effect: (… TAR-get eh-FEKT)
    Pronunciation of dictionary term "off-target effect"
    Describes the effects that can occur when a drug binds to targets (proteins or other molecules in the body) other than those for which the drug was meant to bind. This can lead to unexpected side effects that may be harmful. Learning about the off-target effects of drugs may help in drug development.
  Office for Human Research Protections: (AH-fis … HYOO-mun REE-serch proh-TEK-shuns)
    Pronunciation of dictionary term "Office for Human Research Protections"
    The office within the U.S. Department of Health and Human Services (DHHS) that protects the rights, welfare, and well-being of people involved in clinical trials. It also makes sure that the research follows the law 45 CFR 46 (Protection of Human Subjects). Also called OHRP.
    More Information
    - Office for Human Research Protections (U.S. Department of Health and Human Services) (https://www.hhs.gov/ohrp/)
  ofloxacin: (oh-FLOK-suh-sin)
    Pronunciation of dictionary term "ofloxacin"
    An antibiotic drug used to treat infection. It belongs to the family of drugs called quinolone antibiotics.
  OGF: A substance that relieves pain and is being studied in the treatment of some types of cancer. OGFs bind to cells in the body, including tumor cells, which have OGF receptors on the surface. This may help stop the growth of the tumor cells. It may also prevent the growth of blood vessels that tumors need to grow. An OGF is a type of biological response modifier and a type of antiangiogenesis agent. Also called opioid growth factor.
  Ogivri: (oh-GIV-ree)
    Pronunciation of dictionary term "Ogivri"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Ogivri binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Ogivri is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Hercessi, Herzuma, Kanjinti, Ontruzant, trastuzumab, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  Ogsiveo: (og-SIH-vee-oh)
    Pronunciation of dictionary term "Ogsiveo"
    A drug used to treat adults with desmoid tumors (a type of soft tissue tumor) that have gotten worse and need systemic therapy. It is also being studied in the treatment of other types of cancer. Ogsiveo binds to a protein called gamma secretase, which blocks the activation of other proteins called Notch receptors. Blocking these proteins may help keep tumor cells from growing and may kill them. Ogsiveo is a type of gamma secretase inhibitor. Also called nirogacestat hydrobromide.
    More Information
    - Nirogacestat Hydrobromide (https://www.cancer.gov/about-cancer/treatment/drugs/nirogacestat)
  OGX-011: A substance being studied in the treatment of cancer. It blocks the production of a protein called clusterin, which helps cells live longer. This may kill cancer cells that need clusterin to grow. It may also make cells more sensitive to anticancer drugs. It is a type of antisense oligonucleotide, and a type of chemosensitizing agent. Also called custirsen sodium.
  OHRP: The office within the U.S. Department of Health and Human Services (DHHS) that protects the rights, welfare, and well-being of people involved in clinical trials. It also makes sure that the research follows the law 45 CFR 46 (Protection of Human Subjects). Also called Office for Human Research Protections.
    More Information
    - Office for Human Research Protections (U.S. Department of Health and Human Services) (https://www.hhs.gov/ohrp/)
  ointment: (OYNT-ment)
    Pronunciation of dictionary term "ointment"
    A substance used on the skin to soothe or heal wounds, burns, rashes, scrapes, or other skin problems. Also called unguent.
  Ojemda: (oh-JEM-dah)
    Pronunciation of dictionary term "Ojemda"
    A drug used to treat children aged 6 months and older with low-grade glioma (a type of brain tumor) that has certain mutations (changes) in the BRAF gene. It is used in patients whose tumor came back or did not get better after treatment with other therapy. It is also being studied in the treatment of other types of cancer. Ojemda blocks certain proteins made by the mutated BRAF gene, which may help keep tumor cells from growing. It is a type of kinase inhibitor. Also called tovorafenib.
    More Information
    - Tovorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/tovorafenib)
  Ojjaara: (oh-JAR-uh)
    Pronunciation of dictionary term "Ojjaara"
    A drug used to treat intermediate-risk or high-risk myelofibrosis (MF), including primary MF, post-polycythemia vera MF, and post-essential thrombocythemia MF, in adults with anemia. Ojjaara blocks JAK and other proteins, which may help keep abnormal blood cells or cancer cells from growing. It is a type of kinase inhibitor. Also called momelotinib dihydrochloride monohydrate.
    More Information
    - Momelotinib Dihydrochloride Monohydrate (https://www.cancer.gov/about-cancer/treatment/drugs/momelotinib-dihydrochloride-monohydrate)
  olanzapine: (oh-LAN-zuh-peen)
    Pronunciation of dictionary term "olanzapine"
    A drug used to treat certain mental disorders. It is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of antipsychotic and a type of monoamine antagonist. Also called Zyprexa and Zyprexa Zydis.
  olaparib: (oh-LA-puh-rib)
    Pronunciation of dictionary term "olaparib"
    A drug used alone or with other drugs to treat adults with certain types of prostate cancer, pancreatic cancer, breast cancer, or ovarian, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Olaparib blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Olaparib is a type of PARP inhibitor. Also called AZD2281, Lynparza, and PARP inhibitor AZD2281.
    More Information
    - Olaparib (https://www.cancer.gov/about-cancer/treatment/drugs/olaparib)
  olaratumab: (oh-LAYR-uh-TOO-mab)
    Pronunciation of dictionary term "olaratumab"
    A drug used with doxorubicin to treat soft tissue sarcoma that cannot be treated with radiation therapy or surgery. It is used in patients whose cancer has not already been treated with an anthracycline (a type of anticancer drug). It is also being studied in the treatment of other types of cancer. Olaratumab binds to a receptor for a protein called platelet-derived growth factor (PDGF), which is found on some types of cancer cells. Blocking this protein receptor may help keep cancer cells from growing and prevent the growth of new blood vessels that tumors need to grow. Olaratumab is a type of monoclonal antibody. Also called anti-PDGFR alpha monoclonal antibody IMC-3G3, anti-platelet-derived growth factor receptor alpha monoclonal antibody IMC-3G3, IMC-3G3, and Lartruvo.
    More Information
    - Olaratumab (https://www.cancer.gov/about-cancer/treatment/drugs/olaratumab)
  Oleptro: (oh-LEP-troh)
    Pronunciation of dictionary term "Oleptro"
    A drug used to treat depression. It may also be used to help relieve anxiety and insomnia (trouble sleeping) and to treat certain other disorders. Oleptro increases the level of the chemical serotonin in the brain, which helps improve mood. It is a type of antidepressant. Also called trazodone.
  olfaction: (ol-FAK-shun)
    Pronunciation of dictionary term "olfaction"
    The sense of smell.
  olfactory: (ol-FAK-tuh-ree)
    Pronunciation of dictionary term "olfactory"
    Having to do with the sense of smell.
  olfactory bulb: (ol-FAK-tuh-ree bulb)
    Pronunciation of dictionary term "olfactory bulb"
    A rounded mass of tissue that contains several types of nerve cells that are involved in the sense of smell. There are two olfactory bulbs on the bottom side of the brain, one above each nasal cavity. The olfactory bulbs receive information about smells from the nose and send it to the brain by way of the olfactory tracts.
  olfactory neuroblastoma: (ol-FAK-tuh-ree NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "olfactory neuroblastoma"
    A rare type of cancer that forms in the tissues of the upper part of the nasal cavity (space inside the nose). This area is near the bone that separates the nasal cavity from the brain. These tissues are involved in the sense of smell. Olfactory neuroblastoma may spread from the nasal cavity to the bone around the eyes, the sinuses, the front part of the brain, or the lymph nodes in the neck. It is the most common type of nasal cavity tumor in children, especially in teens. Also called esthesioneuroblastoma.
    More Information
    - Childhood Esthesioneuroblastoma
    Esthesioneuroblastomas form in the olfactory nerve endings in the upper part of the nasal cavity. The olfactory nerves (sense of smell) pass through the many tiny holes in the bone at the base of the brain to the olfactory bulb. Esthesioneuroblastomas may spread from the nasal cavity to the nasal sinuses or to nearby tissue. They may also spread to the brain or to other parts of the body (not shown).
    Drawing shows areas of the body where esthesioneuroblastoma tumors may form, including the olfactory nerve endings, olfactory bulb, nasal cavity, nasal sinuses, and brain.
  olfactory system: (ol-FAK-tuh-ree SIS-tem)
    Pronunciation of dictionary term "olfactory system"
    The parts of the body involved in sensing smell, including the nose and many parts of the brain. Smell may affect emotion, behavior, memory, and thought.
  olfactory transduction: (ol-FAK-tuh-ree tranz-DUK-shun)
    Pronunciation of dictionary term "olfactory transduction"
    A series of events in which cells in the nose bind to scent-bearing molecules and send electrical signals to the brain where they are perceived as smells.
  oligoastrocytoma: (AH-lih-goh-AS-troh-sy-TOH-muh)
    Pronunciation of dictionary term "oligoastrocytoma"
    A brain tumor that forms from both oligodendrocytes and astrocytes, which are types of glial cells (cells that cover and protect nerve cells in the brain and spinal cord and help them work the way they should). An oligoastrocytoma is a type of mixed glioma.
  oligodendrocyte: (AH-lih-goh-DEN-droh-site)
    Pronunciation of dictionary term "oligodendrocyte"
    A cell that forms the myelin sheath (a layer that covers and protects nerve cells) in the brain and spinal cord. An oligodendrocyte is a type of glial cell.
  oligodendroglial tumor: (AH-lih-goh-den-DROH-glee-ul TOO-mer)
    Pronunciation of dictionary term "oligodendroglial tumor"
    A rare, slow-growing tumor that begins in oligodendrocytes (cells that cover and protect nerve cells in the brain and spinal cord). Also called oligodendroglioma.
  oligodendroglioma: (AH-lih-goh-DEN-droh-glee-OH-muh)
    Pronunciation of dictionary term "oligodendroglioma"
    A rare, slow-growing tumor that begins in oligodendrocytes (cells that cover and protect nerve cells in the brain and spinal cord). Also called oligodendroglial tumor.
  oligofructose-enriched inulin: (AH-lih-goh-FROOK-tose-en-RICHT IN-yoo-lin)
    Pronunciation of dictionary term "oligofructose-enriched inulin"
    A substance that is used to improve the health of the digestive system and bones and is being studied in the prevention of colon cancer. Oligofructose-enriched inulin is made by combining two substances that occur naturally in many plants, including chicory root, wheat, bananas, onion, and garlic. Oligofructose-enriched inulin helps healthy bacteria grow in the intestines and helps the body absorb calcium and magnesium. Also called Raftilose Synergy 1.
  oligometastasis: (AH-lih-goh-meh-TAS-tuh-sis)
    Pronunciation of dictionary term "oligometastasis"
    A type of metastasis in which cancer cells from the original (primary) tumor travel through the body and form a small number of new tumors (metastatic tumors) in one or two other parts of the body. For example, cancer cells may spread from the breast to form one or two new tumors in the brain or spread from the colon to form new tumors in the liver. These types of tumors may be treatable.
  oligopolyposis: (AH-lih-goh-PAH-lee-POH-sis)
    Pronunciation of dictionary term "oligopolyposis"
    The condition of having between 10 and 100 polyps (abnormal growths) on the inner walls of the colon and rectum. This occurs in people who have certain types of inherited colorectal cancer syndromes, such as AFAP.
  Ollier disease: (oh-lee-AY dih-ZEEZ)
    Pronunciation of dictionary term "Ollier disease"
    A rare disorder that causes benign (not cancer) growths of cartilage in the bones that may become cancer. These growths, called enchondromas, usually occur in the bones of the hands and feet, but they may also occur in the skull, ribs, and spine. They may cause bones to break, to be deformed, or to be shorter than usual. People with Ollier disease have an increased risk of developing certain types of cancer, including chondrosarcoma (cancer that forms in bone cartilage) and cancers of the ovary or liver. Ollier disease is most common in children and young adults. Also called enchondromatosis.
    More Information
    - Ollier disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7251/ollier-disease)
    - Ollier disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/ollier-disease/)
  oltipraz: (OL-tih-praz)
    Pronunciation of dictionary term "oltipraz"
    A drug used in cancer prevention.
  olutasidenib: (oh-LOO-tuh-SIH-deh-nib)
    Pronunciation of dictionary term "olutasidenib"
    A drug used to treat adults with acute myeloid leukemia that has come back or has not gotten better with other treatment and has a mutation (change) in the IDH1 gene. It is also being studied in the treatment of other types of cancer. Olutasidenib blocks the protein made by the mutated IDH1 gene. Blocking this protein may help keep cancer cells from growing. Olutasidenib is a type of enzyme inhibitor. Also called Rezlidhia.
    More Information
    - Olutasidenib (https://www.cancer.gov/about-cancer/treatment/drugs/olutasidenib)
  omacetaxine mepesuccinate: (OH-mah-seh-TAK-seen MEH-peh-SUK-sih-nayt)
    Pronunciation of dictionary term "omacetaxine mepesuccinate"
    A drug used to treat adults with certain types of chronic myelogenous leukemia that cannot be treated with tyrosine kinase inhibitors (a type of anticancer drug) or that have not gotten better after treatment with at least two tyrosine kinase inhibitors. It is also being studied in the treatment of other types of cancer. Omacetaxine mepesuccinate blocks certain proteins involved in cell growth and may kill cancer cells. It is a type of plant alkaloid and a type of protein synthesis inhibitor. Also called homoharringtonine and Synribo.
    More Information
    - Omacetaxine Mepesuccinate (https://www.cancer.gov/about-cancer/treatment/drugs/omacetaxinemepesuccinate)
  omega-3 fatty acid: (oh-MAY-guh-3 ...)
    Pronunciation of dictionary term "omega-3 fatty acid"
    A type of fat obtained in the diet and involved in immunity.
  omentectomy: (OH-men-TEK-toh-mee)
    Pronunciation of dictionary term "omentectomy"
    Surgery to remove part or all of the omentum.
  omentum: (oh-MEN-tum)
    Pronunciation of dictionary term "omentum"
    A fold of the peritoneum (the thin tissue that lines the abdomen) that surrounds the stomach and other organs in the abdomen.
  omeprazole: (oh-MEH-pruh-zole)
    Pronunciation of dictionary term "omeprazole"
    A drug that inhibits gastric acid secretion.
  Ommaya reservoir: (oh-MY-uh REH-zer-vwahr)
    Pronunciation of dictionary term "Ommaya reservoir"
    A device surgically placed under the scalp and used to deliver anticancer drugs to the fluid surrounding the brain and spinal cord.
  ON 01910.Na: A substance being studied in the treatment of cancer. It blocks certain proteins that are needed for cell growth and may kill cancer cells. ON 01910.Na is a type of protein kinase inhibitor and a type of benzyl styryl sulfone analog.
  onabotulinumtoxinA: (ON-uh-BAH-choo-LY-num-TOK-sin-A)
    Pronunciation of dictionary term "onabotulinumtoxinA"
    A drug used to treat certain medical conditions. These include severe underarm sweating and severe muscle spasms in the neck and shoulders. OnabotulinumtoxinA is also used to smooth wrinkles on the face. It is being studied in the treatment of pain in patients with skin leiomyomas (benign smooth muscle tumors) and other conditions. It is a form of a toxin made by the bacterium Clostridium botulinum.
  Oncaspar: (ON-kah-spar)
    Pronunciation of dictionary term "Oncaspar"
    A drug used with other drugs to treat adults and children with acute lymphoblastic leukemia. It is used in patients whose cancer has not already been treated or who cannot be treated with asparaginase. It is also being studied in the treatment of other types of cancer. Oncaspar is made up of the enzyme L-asparaginase that is linked to a substance called PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. Oncaspar is a type of protein synthesis inhibitor. Also called PEG-asparaginase and pegaspargase.
    More Information
    - Pegaspargase (https://www.cancer.gov/about-cancer/treatment/drugs/pegaspargase)
  Oncaspar-IV: (ON-kah-spar …)
    Pronunciation of dictionary term "Oncaspar-IV"
    A drug used to treat acute lymphoblastic leukemia (ALL). It is a form of the anticancer drug PEG-asparaginase that stays in the body longer. Oncaspar-IV is an enzyme that breaks down the amino acid asparagine and may block the growth of tumor cells that need asparagine to grow. It is a type of protein synthesis inhibitor. Also called EZN-2285 and SC-PEG E. coli L-asparaginase.
  oncogene: (ON-koh-jeen)
    Pronunciation of dictionary term "oncogene"
    A mutated (changed) form of a type of gene called a proto-oncogene, which is involved in normal cell growth and division. When a proto-oncogene is changed so that too many copies are made or it becomes more active than normal, it is called an oncogene. Oncogenes may cause normal cells to become cancer cells and grow in the body. Mutations that lead to the conversion of proto-oncogenes to oncogenes usually occur during a person’s lifetime and are not inherited from a parent.
    More Information
    - Oncogene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Oncogene)
  oncologist: (on-KAH-loh-jist)
    Pronunciation of dictionary term "oncologist"
    A doctor who has special training in diagnosing and treating cancer. Some oncologists specialize in a particular type of cancer treatment. For example, a radiation oncologist specializes in treating cancer with radiation.
  oncology: (on-KAH-loh-jee)
    Pronunciation of dictionary term "oncology"
    A branch of medicine that specializes in the diagnosis and treatment of cancer. It includes medical oncology (the use of chemotherapy, hormone therapy, and other drugs to treat cancer), radiation oncology (the use of radiation therapy to treat cancer), and surgical oncology (the use of surgery and other procedures to treat cancer).
  oncology nurse: (on-KAH-loh-jee...)
    Pronunciation of dictionary term "oncology nurse"
    A nurse who specializes in treating and caring for people who have cancer.
  oncology pharmacy specialist: (on-KAH-loh-jee FAR-muh-see SPEH-shuh-list)
    Pronunciation of dictionary term "oncology pharmacy specialist"
    A licensed pharmacist with special training in how to design, give, monitor, and change chemotherapy for cancer patients. Also called BCOP and board certified oncology pharmacy specialist.
  oncolysate: (on-KAH-lih-sayt)
    Pronunciation of dictionary term "oncolysate"
    An extract made from cancer cells.
  oncolysis: (on-KAH-lih-sis)
    Pronunciation of dictionary term "oncolysis"
    The lysis (breakdown) of cancer cells. This can be caused by chemical or physical means (for example, strong detergents or high-energy sound waves) or by infection with a strain of virus that can lyse cells.
  oncolytic virotherapy: (ON-koh-LIH-tik VY-roh-THAYR-uh-pee)
    Pronunciation of dictionary term "oncolytic virotherapy"
    Treatment using an oncolytic virus (a virus that infects and breaks down cancer cells but not normal cells ). Oncolytic virotherapy may make it easier to kill tumor cells with chemotherapy and radiation therapy. It is a type of targeted therapy. Also called oncolytic virus therapy, viral therapy, and virotherapy.
  oncolytic virus: (ON-koh-LIH-tik VY-rus)
    Pronunciation of dictionary term "oncolytic virus"
    A type of virus that infects and lyses (breaks down) cancer cells but not normal cells. Oncolytic viruses can occur naturally or can be made in the laboratory by changing other viruses. Certain oncolytic viruses are being studied in the treatment of cancer. They may make it easier to kill tumor cells with chemotherapy and radiation therapy.
  oncolytic virus therapy: (ON-koh-LIH-tik VY-rus THAYR-uh-pee)
    Pronunciation of dictionary term "oncolytic virus therapy"
    Treatment using an oncolytic virus (a virus that infects and breaks down cancer cells but not normal cells ). Oncolytic virus therapy may make it easier to kill tumor cells with chemotherapy and radiation therapy. It is a type of targeted therapy. Also called oncolytic virotherapy, viral therapy, and virotherapy.
  Onconase: (ON-koh-nays)
    Pronunciation of dictionary term "Onconase"
    A substance being studied in the treatment of cancer. It is a type of ribonuclease enzyme. Also called ranpirnase.
  Oncophage: (ON-koh-fayj)
    Pronunciation of dictionary term "Oncophage"
    A vaccine made from a patient’s tumor cells that may help the body’s immune system kill cancer cells. This vaccine is used to treat kidney cancer, a type of brain cancer called glioma, and metastatic melanoma (a type of skin cancer that has spread). It is also being studied in the treatment of other types of cancer. Also called gp96 heat shock protein-peptide complex vaccine, gp96 HSP-peptide complex, and vitespen.
  Oncotype DX breast cancer assay: (ON-koh-tipe … brest KAN-ser A-say)
    Pronunciation of dictionary term "Oncotype DX breast cancer assay"
    A lab test that is used to help predict whether breast cancer will come back or spread to other parts of the body. The test looks at the activity level of 21 different genes in breast cancer tissue of people with early-stage (stage I, II, or IIIA) invasive breast cancer that is estrogen receptor (ER) positive, HER2 negative, and is either node-negative or has spread to 1 to 3 lymph nodes. If the test shows that there is a high risk that the cancer will spread or come back, treatment with chemotherapy may be needed to lower the risk. Also called 21-gene signature.
  Oncotype DX ductal carcinoma in situ (DCIS) assay: (ON-koh-tipe … DUK-tul KAR-sih-NOH-muh in SY-too … A-say)
    Pronunciation of dictionary term "Oncotype DX ductal carcinoma in situ (DCIS) assay"
    A test that is being studied as a way to help predict whether ductal carcinoma in situ (DCIS) will come back or become invasive and spread to other tissues in the same breast. The test looks at the activity of 12 different genes in DCIS tissue, and it may be used to help plan treatment.
  Oncovin: (ON-koh-vin)
    Pronunciation of dictionary term "Oncovin"
    A drug that contains the active ingredient vincristine sulfate, which is used to treat many types of cancer. Oncovin brand has been taken off the market and is no longer available.
  ondansetron hydrochloride: (on-DAN-seh-tron HY-droh-KLOR-ide)
    Pronunciation of dictionary term "ondansetron hydrochloride"
    A drug used to prevent nausea and vomiting caused by chemotherapy and radiation therapy and nausea and vomiting after surgery. Ondansetron hydrochloride blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Ondansetron hydrochloride is a type of antiemetic and a type of serotonin receptor antagonist. Also called Zofran.
    More Information
    - Ondansetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/ondansetronhydrochloride)
  Onivyde: (AH-nih-vide)
    Pronunciation of dictionary term "Onivyde"
    A form of the anticancer drug irinotecan hydrochloride that is contained inside very tiny, fat-like particles and is used with other drugs to treat adults with pancreatic cancer that has spread to other parts of the body. It is used in patients whose cancer has not been treated with other anticancer therapy or has gotten worse after treatment with gemcitabine hydrochloride. It is also being studied in the treatment of other types of cancer. Onivyde may have fewer side effects and work better than other forms of irinotecan hydrochloride. Onivyde blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called irinotecan sucrosofate and PEP02.
    More Information
    - Irinotecan Sucrosofate (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecan-hydrochloride-liposome)
  Onrigin: (ON-rih-jin)
    Pronunciation of dictionary term "Onrigin"
    A drug used to treat acute myelogenous leukemia (AML). It is also being studied in the treatment of several other types of cancer. It blocks cell growth by damaging the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Cloretazine and laromustine.
  onset of action: (... AK-shun)
    Pronunciation of dictionary term "onset of action"
    The length of time it takes for a medicine to start to work.
  Ontak: (ON-tak)
    Pronunciation of dictionary term "Ontak"
    A drug used to treat adults with cutaneous T-cell lymphoma that has recurred (come back) or has not gotten better with other treatment. It is used in patients whose cancer has a receptor for the protein interleukin-2 (IL-2). It is also being studied in the treatment of other types of cancer. Ontak is made by combining IL-2 with a bacterial toxin. The IL-2 part of the drug attaches to the cancer cells and the toxin kills them. Ontak is a type of immunotoxin and a type of fusion protein. Also called denileukin diftitox.
    More Information
    - Denileukin Diftitox (https://www.cancer.gov/about-cancer/treatment/drugs/denileukindiftitox)
  Ontruzant: (on-TROO-zant)
    Pronunciation of dictionary term "Ontruzant"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Ontruzant binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Ontruzant is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Hercessi, Herzuma, Kanjinti, Ogivri, trastuzumab, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  Onureg: (ON-yoo-reg)
    Pronunciation of dictionary term "Onureg"
    A drug that contains the active ingredient azacitidine and is used to treat adults with certain types of acute myeloid leukemia. It is used in patients whose cancer is in first complete remission after intensive induction chemotherapy and who were not able to finish intensive therapy that would cure their cancer. Onureg stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Azacitidine (https://www.cancer.gov/about-cancer/treatment/drugs/azacitidine)
  onychodystrophy: (ON-ih-koh-DIS-truh-fee)
    Pronunciation of dictionary term "onychodystrophy"
    Abnormal changes in the shape, color, texture, and growth of the fingernails or toenails. Onychodystrophy is often caused by infection or injury to the nail. It may also be caused by certain conditions, including psoriasis, eczema, warts, cysts, and some tumors. Changes in nails can also be a sign of chronic heart, lung, liver, or kidney disease. Treatment with certain drugs, including chemotherapy drugs, can also cause changes to the nails. Also called nail dystrophy.
  ONYX-015: A modified cold virus that selectively grows in and destroys certain types of cancer cells and leaves normal cells undamaged.
  oocyte cryopreservation: (OH-oh-site KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "oocyte cryopreservation"
    The process of freezing one or more unfertilized eggs (eggs that have not been combined with sperm) to save them for future use. The eggs are thawed and fertilized in the laboratory to make embryos that can be placed in a woman’s uterus. Oocyte cryopreservation is being studied as a type of fertility preservation. It may be useful for women with cancer who want to have children after having radiation therapy, chemotherapy, or certain types of surgery, which can cause infertility. Also called egg banking, egg cryopreservation, and egg freezing.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  oophorectomy: (oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "oophorectomy"
    Surgery to remove one or both ovaries.
  oophoropexy: (oh-oh-FOR-oh-PEK-see)
    Pronunciation of dictionary term "oophoropexy"
    A procedure used to help keep a woman fertile by preventing damage to the ovaries during radiation therapy. Before radiation therapy begins, one or both ovaries and fallopian tubes are separated from the uterus and attached to the wall of the abdomen away from where the radiation will be given. Oophoropexy may be useful for women who want to have children after having radiation therapy that can cause infertility. It is a type of fertility preservation. Also called ovarian transposition.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  Opana: (oh-PA-nuh)
    Pronunciation of dictionary term "Opana"
    A drug used to treat moderate to severe pain. It is also used as a sedative before surgery, to help with anesthesia during surgery, during labor, and to treat anxiety caused by some medical conditions. It is made from morphine and binds to opioid receptors in the central nervous system. Opana is a type of opioid and a type of analgesic agent. Also called Numorphan and oxymorphone hydrochloride.
  Opdivo: (op-DEE-voh)
    Pronunciation of dictionary term "Opdivo"
    A drug that binds to the protein PD-1 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that express the protein PD-L1 or that have certain mutations (changes) in genes involved in DNA repair. Opdivo is used alone or with other drugs to treat certain types of classic Hodgkin lymphoma, colorectal cancer, esophageal cancer, gastroesophageal junction cancer, head and neck squamous cell carcinoma, hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, melanoma, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), stomach cancer, and urothelial carcinoma (a type of bladder or urinary tract cancer). It is also being studied in the treatment of other types of cancer. Opdivo may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called nivolumab.
    More Information
    - Nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
  Opdivo Qvantig: (op-DEE-voh kyoo-VAN-tig)
    Pronunciation of dictionary term "Opdivo Qvantig"
    A combination of two drugs used alone or with other drugs to treat adults with certain types of colorectal cancer, esophageal cancer, gastric (stomach) cancer, gastroesophageal junction adenocarcinoma, hepatocellular carcinoma (a type of liver cancer), melanoma, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), squamous cell carcinoma of the head and neck, and urothelial carcinoma (a type of cancer in the bladder or urinary tract). Nivolumab binds to a protein called PD-1, which is found on some normal cells and some types of cancer cells. Nivolumab may block PD-1 and help the immune system kill cancer cells. Hyaluronidase allows nivolumab to be given by injection under the skin. Opdivo Qvantig can be given in less time than nivolumab alone, which is given as an infusion. Also called nivolumab and hyaluronidase.
    More Information
    - Nivolumab and Hyaluronidase-nvhy (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab-and-hyaluronidase-nvhy)
  Opdualag: (op-DOO-uh-lag)
    Pronunciation of dictionary term "Opdualag"
    A combination of nivolumab and relatlimab used to treat adults and children aged 12 years or older with melanoma that has spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Opdualag binds to the proteins PD-1 and LAG-3, which are found on T cells (a type of immune cell). Blocking these proteins may help the immune system kill cancer cells. The combination of nivolumab and relatlimab may work better than either drug alone. Opdualag is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called nivolumab and relatlimab.
    More Information
    - Nivolumab and Relatlimab-rmbw (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab-and-relatlimab-rmbw)
  open biopsy: (OH-pen BY-op-see)
    Pronunciation of dictionary term "open biopsy"
    A procedure in which a cut is made through the skin to remove abnormal tissue so it can be checked under a microscope for signs of disease. The two types of open biopsy are incisional biopsy, in which part of a lump or a sample of tissue is removed, and excisional biopsy, in which an entire lump or suspicious area is removed. Also called surgical biopsy.
  open colectomy: (... koh-LEK-toh-mee)
    Pronunciation of dictionary term "open colectomy"
    An operation to remove all or part of the colon through a long incision made in the wall of the abdomen. When only part of the colon is removed, it is called a partial colectomy.
  open label study: (OH-pen LAY-bel STUH-dee)
    Pronunciation of dictionary term "open label study"
    A type of study in which both the health providers and the patients are aware of the drug or treatment being given. Also called nonblinded.
  open radical prostatectomy: (… RA-dih-kul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "open radical prostatectomy"
    Surgery to remove the entire prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). Nearby lymph nodes may also be removed. During an open radical prostatectomy, an incision (cut) is made in the wall of the lower abdomen or in the perineum (the area between the scrotum and anus). An attempt is made to protect the nerves that control penile erection and the bladder from damage.
    More Information
    - Treatment Choices for Men With Early-Stage Prostate Cancer (https://www.cancer.gov/publications/patient-education/understanding-prostate-cancer-treatment)
    Two types of radical prostatectomy. In a retropubic prostatectomy, the prostate is removed through an incision in the wall of the abdomen. In a perineal prostatectomy, the prostate is removed through an incision in the area between the scrotum and the anus.
    Two panel drawing showing two ways of doing a radical prostatectomy; in the first panel, dotted line shows where incision is made through the wall of the abdomen for a retropubic prostatectomy; in the second panel, dotted line shows where incision is made in area between the scrotum and the anus for a perineal prostatectomy.
  open resection: (… ree-SEK-shun)
    Pronunciation of dictionary term "open resection"
    Surgery to remove part or all of an organ or a tumor and nearby lymph nodes. The incision is large enough to let the surgeon see into the body.
  operable: (AH-peh-ruh-bul)
    Pronunciation of dictionary term "operable"
    Describes a condition that can be treated by surgery.
  operation: (ah-per-AY-shun)
    Pronunciation of dictionary term "operation"
    A procedure to remove or repair a part of the body or to find out whether disease is present. Also called surgery.
  ophthalmic: (of-THAL-mik)
    Pronunciation of dictionary term "ophthalmic"
    Having to do with the eye.
  ophthalmic artery infusion: (of-THAL-mik AR-tuh-ree in-FYOO-zhun)
    Pronunciation of dictionary term "ophthalmic artery infusion"
    A method of delivering anticancer drugs directly to a tumor in the eye. A catheter (a thin, flexible tube) is put into an artery that leads to the eye and the anticancer drug is given through the catheter. A small balloon may then be put into the artery to block it, which keeps the anticancer drug near the tumor. Ophthalmic artery infusion may be used to treat certain types of retinoblastoma.
  ophthalmologist: (OF-thul-MAH-loh-jist)
    Pronunciation of dictionary term "ophthalmologist"
    A doctor who has special training in diagnosing and treating eye problems, including injury and disease.
  ophthalmoscope: (of-THAL-moh-skope)
    Pronunciation of dictionary term "ophthalmoscope"
    A lighted instrument used to examine the inside of the eye, including the retina and the optic nerve.
  ophthalmoscopy: (OF-thul-MOS-koh-pee)
    Pronunciation of dictionary term "ophthalmoscopy"
    An exam that uses a magnifying lens and a light to check the fundus of the eye (back of the inside of the eye, including the retina and optic nerve). The pupils may be dilated (enlarged) with medicated eye drops so the doctor can see through the pupil to the back of the eye. Ophthalmoscopy may be used to check for eye problems, such as glaucoma, macular degeneration, eye cancer, optic nerve problems, or eye injury. Also called fundoscopy and funduscopy.
  opiate: (OH-pee-ut)
    Pronunciation of dictionary term "opiate"
    A substance used to treat pain or cause sleep. Opiates are made from opium or have opium in them. Opiates bind to opioid receptors in the central nervous system. Examples of opiates are codeine, heroin, and morphine. An opiate is a type of analgesic agent.
  opioid: (OH-pee-OYD)
    Pronunciation of dictionary term "opioid"
    A class of drug used to reduce moderate to severe pain. Opioids can be made from the opium poppy plant or in the laboratory. They block pain signals by binding to opioid receptors on nerve cells in the brain, spinal cord, gastrointestinal tract, and other organs in the body. Some opioids may also be used to treat cough and diarrhea. Opioids used for pain relief are usually safe when taken for a short time and as prescribed by a health care provider, but they can be highly addictive and as a result have often been misused or abused.
    More Information
    - Cancer Pain
  opioid growth factor: (OH-pee-OYD grothe FAK-ter)
    Pronunciation of dictionary term "opioid growth factor"
    A substance that relieves pain and is being studied in the treatment of some types of cancer. Opioid growth factors bind to cells in the body, including tumor cells, which have opioid growth factor receptors on the surface. This may help stop the growth of the tumor cells. It may also prevent the growth of blood vessels that tumors need to grow. An opioid growth factor is a type of biological response modifier and a type of antiangiogenesis agent. Also called OGF.
  opium: (OH-pee-um)
    A highly addictive, natural substance that comes from the seed pods of the poppy plant, Papaver somniferum. Opium contains chemicals that affect the brain, causing pain relief and a feeling of euphoria. It is used to make medicines like morphine and codeine. Opium is dangerous when misused. High doses can slow breathing, cause unconsciousness, or lead to death.
  OPMD: A group of conditions in which there are abnormal tissue changes in the mouth that may become cancer. These changes may include a lump, thickening, or abnormal patch of red and/or white tissue that forms on the lips, gums, tongue, inner lining of the cheeks, or other areas in the mouth. There are many different types of OPMDs, but the most common types are leukoplakia and erythroplakia. OPMDs may occur in people who have certain rare hereditary conditions, including dyskeratosis congenita, epidermolysis bullosa, xeroderma pigmentosum, and Plummer-Vinson syndrome. Having an OPMD increases a person’s risk of developing oral cancer. Also called oral potentially malignant disorder.
  OPPA: An abbreviation for a chemotherapy combination that is often used with radiation therapy to treat a certain type of childhood Hodgkin lymphoma in females. It includes the drugs vincristine sulfate (Oncovin), prednisone, procarbazine hydrochloride, and doxorubicin hydrochloride (Adriamycin). Also called OPPA regimen.
    More Information
    - OPPA (https://www.cancer.gov/about-cancer/treatment/drugs/OPPA)
  OPPA regimen: (... REH-jih-men)
    Pronunciation of dictionary term "OPPA regimen"
    An abbreviation for a chemotherapy combination that is often used with radiation therapy to treat a certain type of childhood Hodgkin lymphoma in females. It includes the drugs vincristine sulfate (Oncovin), prednisone, procarbazine hydrochloride, and doxorubicin hydrochloride (Adriamycin). Also called OPPA.
    More Information
    - OPPA (https://www.cancer.gov/about-cancer/treatment/drugs/OPPA)
  opportunistic infection: (AH-per-too-NIS-tik in-FEK-shun)
    Pronunciation of dictionary term "opportunistic infection"
    An infection caused by an organism that does not normally cause disease. Opportunistic infections occur in people with weakened immune systems.
  oprelvekin: (oh-PREL-veh-KIN)
    Pronunciation of dictionary term "oprelvekin"
    A drug used to increase the number of blood cells, especially platelets, in some cancer patients receiving chemotherapy. Oprelvekin is a form of interleukin-11 (a cytokine normally made by support cells in the bone marrow) that is made in the laboratory. It is a type of biological response modifier. Also called Neumega, recombinant human interleukin-11, and rhIL-11.
  OPT-80: A substance being studied in the treatment of diarrhea caused by infection with Clostridium difficile (a type of bacteria that can grow without oxygen) in cancer patients. OPT-80 is a type of antibiotic. Also called PAR-101 and tiacumicin B.
  optic chiasm: (OP-tik ky-A-zum)
    Pronunciation of dictionary term "optic chiasm"
    The place in the brain where some of the optic nerve fibers coming from one eye cross optic nerve fibers from the other eye. Also called optic chiasma.
  optic chiasma: (OP-tik ky-AZ-muh)
    Pronunciation of dictionary term "optic chiasma"
    The place in the brain where some of the optic nerve fibers coming from one eye cross optic nerve fibers from the other eye. Also called optic chiasm.
  optic nerve: (OP-tik nerv)
    Pronunciation of dictionary term "optic nerve"
    The nerve that carries messages from the retina to the brain.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  optic neuritis: (OP-tik noo-RY-tis)
    Pronunciation of dictionary term "optic neuritis"
    Inflammation of the optic nerve (the nerve that carries messages from the back of the eye to the brain). It may be caused by infection, drugs, toxins, and diseases of the immune system, such as multiple sclerosis. Symptoms include sudden changes in vision in one eye, including loss of vision and pain with eye movement. The symptoms often disappear within a few weeks.
  optic pathway glioma: (OP-tik ... glee-OH-muh)
    Pronunciation of dictionary term "optic pathway glioma"
    A rare, slow-growing tumor that usually forms in the optic nerve, optic chiasm, or optic tract. These are parts of the nervous system that carry messages from the eye to the brain. Also called visual pathway glioma.
  optic tract: (OP-tik trakt)
    Pronunciation of dictionary term "optic tract"
    The nerves that travel from the optic chiasm (place in the brain where some of the optic nerve fibers cross) into certain parts of the brain involved in vision.
  optical coherence tomography: (OP-tih-kul koh-HEER-ents toh-MAH-gruh-fee)
    Pronunciation of dictionary term "optical coherence tomography"
    A procedure that uses infrared light waves to give three-dimensional (3-D) pictures of structures inside tissues and organs. The pictures are made by a computer linked to the light source. Also called OCT.
  optical spectroscopy: (OP-tih-kul spek-TROS-koh-pee)
    Pronunciation of dictionary term "optical spectroscopy"
    In medicine, a technique that uses low power light, fiberoptic instruments, and detectors to examine tissue. It is being studied as a way to identify differences between normal cells and cells that may become cancer, and as a way to identify cancer cells that remain in the edges of tumor tissue removed from a patient.
  optimism: (OP-tih-MIH-zum)
    Pronunciation of dictionary term "optimism"
    The tendency to believe that there is good in everything and to have positive thoughts about most things that happen.
  oral: (OR-ul)
    Pronunciation of dictionary term "oral"
    By or having to do with the mouth.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    - Oral Complications of Cancer Therapies
  oral and maxillofacial surgeon: (OR-ul ... MAK-sih-loh-FAY-shul SER-jun)
    Pronunciation of dictionary term "oral and maxillofacial surgeon"
    A dentist who has special training in surgery of the mouth, face, and jaw.
  oral cancer: (OR-ul KAN-ser)
    Pronunciation of dictionary term "oral cancer"
    Cancer that forms in tissues of the oral cavity (the mouth) or the oropharynx (the part of the throat at the back of the mouth).
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
  oral cavity: (OR-ul KA-vih-tee)
    Pronunciation of dictionary term "oral cavity"
    Refers to the mouth. It includes the lips, the lining inside the cheeks and lips, the front two thirds of the tongue, the upper and lower gums, the floor of the mouth under the tongue, the bony roof of the mouth, and the small area behind the wisdom teeth.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  oral cavity cancer: (OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "oral cavity cancer"
    Cancer that forms in tissues of the oral cavity (the mouth). The tissues of the oral cavity include the lips, the lining inside the cheeks and lips, the front two thirds of the tongue, the upper and lower gums, the floor of the mouth under the tongue, the bony roof of the mouth, and the small area behind the wisdom teeth.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
  oral chemotherapy: (OR-ul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "oral chemotherapy"
    Treatment with drugs given by mouth to kill cancer cells or stop them from dividing.
  oral contraceptive pill: (OR-ul KON-truh-SEP-tiv ...)
    Pronunciation of dictionary term "oral contraceptive pill"
    A pill used to prevent pregnancy. It contains hormones that block the release of eggs from the ovaries. Most oral contraceptives include estrogen and progestin. Also called birth control pill.
    More Information
    - Oral Contraceptives and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/oral-contraceptives-fact-sheet)
  oral dysplasia: (OR-ul dis-PLAY-zhuh)
    Pronunciation of dictionary term "oral dysplasia"
    The presence of abnormal cells in the tissues of the mouth. These tissues include the lips, the lining of the inside of the cheeks, the gums, the front two thirds of the tongue, the bottom of the mouth under the tongue, the bony part of the roof of the mouth, and the small area behind the wisdom teeth. Oral dysplasia may be found in patches of tissue that look red, white, or a mixture of both colors but can only be diagnosed by looking at the cells under a microscope. It is most commonly caused by tobacco or alcohol use. It may also be caused by infection with certain types of human papillomavirus (HPV). Oral dysplasia is not cancer but may become cancer and spread to nearby normal tissue. It can be mild, moderate, or severe, depending on how abnormal the cells look under a microscope and how much of the tissues in the mouth are affected. Also called OED and oral epithelial dysplasia.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  oral epithelial dysplasia: (OR-ul eh-pih-THEE-lee-ul dis-PLAY-zhuh)
    Pronunciation of dictionary term "oral epithelial dysplasia"
    The presence of abnormal cells in the tissues of the mouth. These tissues include the lips, the lining of the inside of the cheeks, the gums, the front two thirds of the tongue, the bottom of the mouth under the tongue, the bony part of the roof of the mouth, and the small area behind the wisdom teeth. Oral epithelial dysplasia may be found in patches of tissue that look red, white, or a mixture of both colors but can only be diagnosed by looking at the cells under a microscope. It is most commonly caused by tobacco or alcohol use. It may also be caused by infection with certain types of human papillomavirus (HPV). Oral epithelial dysplasia is not cancer but may become cancer and spread to nearby normal tissue. It can be mild, moderate, or severe, depending on how abnormal the cells look under a microscope and how much of the tissues in the mouth are affected. Also called OED and oral dysplasia.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  oral papilloma: (OR-ul PA-pih-LOH-muh)
    Pronunciation of dictionary term "oral papilloma"
    A benign (not cancer), wart-like growth that occurs on the lips or in the mouth, including the tongue, gums, tonsils, and back of the throat. Oral papillomas often appear as pink or white bumps that may be different sizes. They are usually painless and do not cause symptoms. Oral papillomas may be caused by chronic infection with certain types of human papillomavirus (HPV). They may also be found in people with a rare, inherited condition called Cowden syndrome. Oral papillomas most often occur in adults.
    Oral papillomas are benign growths of epithelial cells that may be seen in individuals with Cowden syndrome, a hereditary syndrome associated with the development of several types of cancer. The papillomas may vary in size.
    Two-panel photograph showing the tongues of two individuals with Cowden syndrome. The left panel shows a tongue covered with many small white bumps. The right panel shows a tongue with larger, irregularly shaped growths on its surface.
    Oral papillomas are benign (not cancer), wart-like growths that occur on the lips or in the mouth, including the tongue, and may be different sizes. They may be seen in people with Cowden syndrome, a hereditary syndrome associated with the development of several types of cancer.
    Two-panel photograph showing the tongues of two individuals with Cowden syndrome. The left panel shows a tongue covered with many small white bumps. The right panel shows a tongue with larger, irregularly shaped growths on its surface.
  oral potentially malignant disorder: (OR-ul poh-TEN-shuh-lee muh-LIG-nunt dis-OR-der)
    Pronunciation of dictionary term "oral potentially malignant disorder"
    A group of conditions in which there are abnormal tissue changes in the mouth that may become cancer. These changes may include a lump, thickening, or abnormal patch of red and/or white tissue that forms on the lips, gums, tongue, inner lining of the cheeks, or other areas in the mouth. There are many different types of oral potentially malignant disorders, but the most common types are leukoplakia and erythroplakia. Oral potentially malignant disorders may occur in people who have certain rare hereditary conditions, including dyskeratosis congenita, epidermolysis bullosa, xeroderma pigmentosum, and Plummer-Vinson syndrome. Having an oral potentially malignant disorder increases a person’s risk of developing oral cancer. Also called OPMD.
  oral surgeon: (OR-ul SER-jun)
    Pronunciation of dictionary term "oral surgeon"
    A dentist with special training in surgery of the mouth and jaw.
  orantinib: (oh-RAN-tih-nib)
    Pronunciation of dictionary term "orantinib"
    A substance being studied in the treatment of cancer. Orantinib blocks proteins involved in the growth and spread of cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called SU006668 and SU6668.
  orbit: (OR-bit)
    Pronunciation of dictionary term "orbit"
    The space within the skull that contains the eye, including its nerves and muscles. The orbit also includes the eyelids and the glands that make tears. It is made up of seven bones that surround and protect the eye. Also called eye socket.
  orchidectomy: (or-kih-DEK-toh-mee)
    Pronunciation of dictionary term "orchidectomy"
    Surgery to remove one or both testicles. Also called orchiectomy.
  orchiectomy: (or-kee-EK-toh-mee)
    Pronunciation of dictionary term "orchiectomy"
    Surgery to remove one or both testicles. Also called orchidectomy.
  oregovomab: (oh-reh-GOH-voh-mab)
    Pronunciation of dictionary term "oregovomab"
    A monoclonal antibody that is being studied in the treatment of ovarian cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. Oregovomab binds to the CA-125 antigen, which is found on most ovarian cancer cells. Also called OvaRex.
  organ: (OR-gun)
    Pronunciation of dictionary term "organ"
    In medicine, a part of the body that is made up of cells and tissues that perform a specific function. Examples of organs include the heart, lungs, stomach, liver, kidney, skin, spleen, uterus, and ovary.
  organelle: (OR-guh-NEL)
    Pronunciation of dictionary term "organelle"
    A small structure in a cell that is surrounded by a membrane and has a specific function. Examples of organelles are the nucleus (a structure that contains the cell’s chromosomes and is where RNA is made), mitochondria (structures that make energy for the cell), and lysosomes (sac-like containers filled with enzymes that digest and help recycle molecules in the cell).
    Parts of a cell. A cell is surrounded by a membrane, which has receptors on the surface. A cell has several small structures inside it, including the nucleus, mitochondria, endoplasmic reticulum, and Golgi complex. These all have specific functions in the cell.
    Drawing showing a cell containing organelles, including the nucleus (contains DNA), the nucleolus, Golgi complex, mitochondria, and endoplasmic reticulum. Also shown are the cell membrane and a membrane receptor.
  organic food: (or-GA-nik …)
    Pronunciation of dictionary term "organic food"
    Food produced without the use of man-made fertilizer, drugs that increase growth, or drugs that kill insects, bacteria, or other living things. In the United States, the Department of Agriculture sets standards for growing, harvesting, processing, and labeling organic foods.
  organism: (OR-guh-NIH-zum)
    Pronunciation of dictionary term "organism"
    A living thing, such as an animal, a plant, a bacterium, or a fungus.
  organism strain: (OR-guh-NIH-zum …)
    Pronunciation of dictionary term "organism strain"
    A group of organisms that belong to the same species but share certain genetic characteristics not found in other members of the species. Microorganisms, such as viruses, bacteria, and fungi, have many strains within a single species. Different strains of an organism may have different biological characteristics, such as the ability to cause more severe disease.
  organoid: (OR-guh-noyd)
    Pronunciation of dictionary term "organoid"
    A 3-dimensional, mini-organ-like structure made by growing a person's tumor cells or stem cells (cells from which other types of cells develop) in the laboratory. Organoids contain many types of cells and closely mimic the structure, organization, and some of the functions of human tissues and organs. Organoids made from a person's tumor cells have histologic, genomic, molecular, and other features that are similar to those found in the original tumor. Organoids are used in the laboratory to study how normal tissues or diseases, such as cancer, form and to test new drugs and other types of treatment before they are given to people.
  orgasm: (OR-ga-zum)
    Pronunciation of dictionary term "orgasm"
    The final part of the sex act, which involves contraction of sexual organs and a sudden release of endorphins, leading to a feeling of pleasure. In males, orgasm usually occurs with release of semen.
  Orgovyx: (or-GOH-vix)
    Pronunciation of dictionary term "Orgovyx"
    A drug used to treat adults with advanced prostate cancer. Orgovyx binds to gonadotropin-releasing hormone (GnRH) receptors in the pituitary gland, which blocks the pituitary gland from making the hormones follicle-stimulating hormone (FSH) and luteinizing hormone (LH). This causes the testicles to stop making testosterone. Orgovyx may stop the growth of cancer cells that need testosterone to grow. It is a type of GnRH antagonist. Also called relugolix.
    More Information
    - Relugolix (https://www.cancer.gov/about-cancer/treatment/drugs/relugolix)
  Oriental medicine: (OR-ee-EN-tul MEH-dih-sin)
    Pronunciation of dictionary term "Oriental medicine"
    A medical system that has been used for thousands of years to prevent, diagnose, and treat disease. It is based on the belief that qi (the body's vital energy) flows along meridians (channels) in the body and keeps a person’s spiritual, emotional, mental, and physical health in balance. Oriental medicine aims to restore the body’s balance and harmony between the natural opposing forces of yin and yang, which can block qi and cause disease. Oriental medicine includes acupuncture, diet, herbal therapy, meditation, physical exercise, and massage. Also called TCM and Traditional Chinese Medicine.
  oropharyngeal cancer: (OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "oropharyngeal cancer"
    Cancer that forms in tissues of the oropharynx (the middle part of the throat, behind the mouth). The oropharynx includes the soft palate (the back muscular part of the roof of the mouth), the side and back walls of the throat, the tonsils, and the back one-third of the tongue. Most oropharyngeal cancers are squamous cell carcinomas (cancer that begins in the thin, flat cells lining the inside of the oropharynx).
    More Information
    - Oropharyngeal Cancer Treatment
  oropharynx: (OR-oh-FAYR-inx)
    Pronunciation of dictionary term "oropharynx"
    The middle part of the throat, behind the mouth. The oropharynx includes the soft palate (the back muscular part of the roof of the mouth), the side and back walls of the throat, the tonsils, and the back one-third of the tongue.
    More Information
    - Oropharyngeal Cancer Treatment
    Parts of the oropharynx. The oropharynx includes the soft palate, the side and back walls of the throat, the tonsils, and the back one-third of the tongue.
    Parts of the oropharynx; drawing shows the soft palate, side and back wall of the throat, tonsil, and the back one-third of the tongue.
  orphan drug: (OR-fun …)
    Pronunciation of dictionary term "orphan drug"
    A drug used to treat, prevent, or diagnose an orphan disease. An orphan disease is a rare disease or condition that affects fewer than 200,000 people in the United States. Orphan diseases are often serious or life threatening. In 1983, the U.S. government passed a law, called the Orphan Drug Act, to give drug companies certain financial benefits for developing orphan drugs that are safe and effective.
  orphan drug designation: (OR-fun … DEH-zig-NAY-shun)
    Pronunciation of dictionary term "orphan drug designation"
    A status given to certain drugs called orphan drugs, which show promise in the treatment, prevention, or diagnosis of orphan diseases. An orphan disease is a rare disease or condition that affects fewer than 200,000 people in the United States. Orphan diseases are often serious or life threatening. In 1983, the U.S. government passed a law, called the Orphan Drug Act, to give drug companies certain financial benefits for developing orphan drugs. This law is meant to help bring more drugs to patients with rare diseases.
  ORR: The percentage of people in a study or treatment group who have a partial response or complete response to the treatment within a certain period of time. A partial response is a decrease in the size of a tumor or in the amount of cancer in the body, and a complete response is the disappearance of all signs of cancer in the body. In a clinical trial, measuring the ORR is one way to see how well a new treatment works. Also called objective response rate.
  Orserdu: (or-SER-doo)
    Pronunciation of dictionary term "Orserdu"
    A drug used to treat postmenopausal women and adult men with estrogen receptor-positive, HER2-negative breast cancer that has a mutation (change) in the ESR1 gene and is advanced or has spread to other parts of the body. It is used in patients whose disease got worse after treatment with at least one type of hormone therapy. Orserdu binds to proteins called estrogen receptors, which are found on some breast cancer cells. These proteins may cause cancer cells to grow. Orserdu blocks these proteins and may keep cancer cells from growing. It is a type of estrogen receptor antagonist. Also called elacestrant dihydrochloride.
    More Information
    - Elacestrant Dihydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/elacestrant-dihydrochloride)
  orthodontist: (OR-thuh-DON-tist)
    Pronunciation of dictionary term "orthodontist"
    A dentist who has special training in preventing, diagnosing, and treating certain problems of the teeth and jaws, such as crooked or crowded teeth and bite problems. An orthodontist uses braces, aligners, retainers, headgear, and other devices to help straighten teeth, hold teeth in place, and improve bite. This can improve overall dental health, chewing, speech, and facial appearance.
  orthodox medicine: (OR-thuh-DOX MEH-dih-sin)
    Pronunciation of dictionary term "orthodox medicine"
    A system in which medical doctors and other health care professionals (such as nurses, pharmacists, and therapists) treat symptoms and diseases using drugs, radiation, or surgery. Also called allopathic medicine, biomedicine, conventional medicine, mainstream medicine, and Western medicine.
  orthopedic surgeon: (OR-thuh-PEE-dik SER-jun)
    Pronunciation of dictionary term "orthopedic surgeon"
    A surgeon who has special training in diagnosing and treating injuries and diseases of the musculoskeletal system. This includes the bones, joints, tendons, ligaments, and muscles.
  orthotopic: (OR-thoh-TAH-pik)
    Pronunciation of dictionary term "orthotopic"
    In medicine, refers to something that occurs in the normal or usual place in the body. It is often used to describe tissue or an organ that is transplanted into its normal place in the body.
  OS: The length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, that patients diagnosed with the disease are still alive. In a clinical trial, measuring the OS is one way to see how well a new treatment works. Also called overall survival.
  oseltamivir phosphate: (oh-sel-TA-mih-veer FOS-fayt)
    Pronunciation of dictionary term "oseltamivir phosphate"
    A drug used to prevent and to treat influenza virus infections. It blocks the release of the virus from infected cells. It is a type of antiviral agent. Also called Tamiflu.
  OSI-774: A drug used alone to treat certain types of non-small cell lung cancer and with gemcitabine hydrochloride to treat certain types of pancreatic cancer. It is also being studied in the treatment of other types of cancer. OSI-774 blocks a protein called EGFR, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called CP-358,774, erlotinib hydrochloride, and Tarceva.
    More Information
    - Erlotinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/erlotinibhydrochloride)
  OSI-7904L: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called thymidylate synthase inhibitors.
  OSI-906: A substance being studied in the treatment of cancer. It blocks a protein called IGF-1R, which is found at high levels in some types of tumors. IGF-1R is needed for cell growth and blocking it may cause tumor cells to die. OSI-906 is a type of IGF-1R inhibitor. Also called IGF-1R inhibitor OSI-906.
  osimertinib mesylate: (OH-sih-MER-tih-nib MEH-zih-layt)
    Pronunciation of dictionary term "osimertinib mesylate"
    A drug used alone or with other drugs to treat adults with certain types of non-small cell lung cancer that have an abnormal EGFR gene. It is also being studied in the treatment of other types of cancer. Osimertinib mesylate blocks certain proteins made by the mutated EGFR gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Tagrisso.
    More Information
    - Osimertinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/osimertinib)
  osmolality: (OZ-moh-LA-lih-tee)
    Pronunciation of dictionary term "osmolality"
    The concentration of particles dissolved in a fluid. The osmolality of serum can help diagnose several medical conditions such as dehydration, diabetes, and shock.
  osmotic: (oz-MAH-tik)
    Pronunciation of dictionary term "osmotic"
    Having to do with osmosis (the passage of a liquid through a membrane from a less concentrated solution to a more concentrated one). This causes the more concentrated solution to become diluted, and makes the concentrations in both solutions more equal. Osmotic also refers to a type of laxative that increases the amount of water in the large intestine, which softens the stool to help it pass more easily.
  osseous tissue: (AH-see-us TIH-shoo)
    Pronunciation of dictionary term "osseous tissue"
    Tissue that gives strength and structure to bones. Bone is made up of compact tissue (the hard, outer layer) and cancellous tissue (the spongy, inner layer that contains red marrow). Osseous tissue is maintained by bone-forming cells called osteoblasts and cells that break down bone called osteoclasts. Bones also contain blood vessels, nerves, proteins, vitamins, and minerals. Also called bone tissue.
    Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.
    Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.
  osteitis deformans: (OS-tee-I-tis dih-FOR-manz)
    Pronunciation of dictionary term "osteitis deformans"
    A chronic condition in which both the breakdown and regrowth of bone are increased. Osteitis deformans occurs most frequently in the pelvic and leg bones, skull, and lower spine. It is most common in older individuals, and may lead to bone pain, deformities, and fractures. Also called Paget disease of bone.
  osteochondroma: (OS-tee-oh-kon-DROH-muh)
    Pronunciation of dictionary term "osteochondroma"
    A benign (not cancer) tumor that has both bone and cartilage in it. This type of tumor usually occurs at the ends of the long bones of the arms and legs or in the pelvis or shoulder. It may cause abnormal growth of the arms, hands, and legs; problems moving the joints; and pain, numbness, and tingling. There may be one or more tumors, and having multiple tumors runs in families. Osteochondromas may also occur at some point in time after cancer treatment, such as stem cell transplant.
  osteogenic sarcoma: (OS-tee-oh-JEH-nik sar-KOH-muh)
    Pronunciation of dictionary term "osteogenic sarcoma"
    A cancer of the bone that usually affects the large bones of the arm or leg. It occurs most commonly in young people and affects more males than females. Also called osteosarcoma.
    More Information
    - Osteosarcoma Treatment
    - Primary Bone Cancer (https://www.cancer.gov/types/bone/bone-fact-sheet)
  osteolytic: (OS-tee-oh-LIH-tik)
    Pronunciation of dictionary term "osteolytic"
    Causing the breakdown of bone.
  osteomalacia: (OS-tee-oh-muh-LAY-shuh)
    Pronunciation of dictionary term "osteomalacia"
    A condition in adults in which bones become soft and deformed because they don’t have enough calcium and phosphorus. It is usually caused by not having enough vitamin D in the diet, not getting enough sunlight, or a problem with the way the body uses vitamin D. Symptoms include bone pain and muscle weakness. When the condition occurs in children, it is called rickets. Also called adult rickets.
  osteomyelitis: (OS-tee-oh-MY-eh-LY-tis)
    Pronunciation of dictionary term "osteomyelitis"
    Inflammation of the bone caused by an infection, which may spread to the bone marrow and tissues near the bone. Osteomyelitis can cause severe pain in the infected bone. If it is not treated, it can kill bone tissue.
  osteonecrosis: (OS-tee-oh-neh-KROH-sis)
    Pronunciation of dictionary term "osteonecrosis"
    A condition in which there is a loss of blood flow to bone tissue, which causes the bone to die. It is most common in the hips, knees, shoulders, and ankles. It may be caused by long-term use of steroid medicines, alcohol abuse, joint injuries, and certain diseases, such as cancer and arthritis. It may also occur at some point in time after cancer treatment that included methotrexate, bisphosphonates, or corticosteroids. Also called aseptic necrosis, avascular necrosis, and ischemic necrosis.
  osteopenia: (OS-tee-oh-PEE-nee-uh)
    Pronunciation of dictionary term "osteopenia"
    A condition in which there is a lower-than-normal bone mass or bone mineral density (the amount of bone mineral contained in a certain amount of bone). Osteopenia is a less severe form of bone loss than osteoporosis.
  osteoporosis: (OS-tee-oh-puh-ROH-sis)
    Pronunciation of dictionary term "osteoporosis"
    A condition in which there is a decrease in the amount and thickness of bone tissue. This causes the bones to become weak and break more easily. Osteoporosis may be caused by older age, hormone changes, taking certain medicines, and not eating enough foods with calcium and vitamin D. It may also be caused by certain types of cancer and cancer treatment. It is most common in white and Asian women.
  osteosarcoma: (OS-tee-oh-sar-KOH-muh)
    Pronunciation of dictionary term "osteosarcoma"
    A cancer of the bone that usually affects the large bones of the arm or leg. It occurs most commonly in young people and affects more males than females. Also called osteogenic sarcoma.
    More Information
    - Osteosarcoma Treatment
    - Primary Bone Cancer (https://www.cancer.gov/types/bone/bone-fact-sheet)
  ostomy: (OS-toh-mee)
    Pronunciation of dictionary term "ostomy"
    An operation to create an opening (a stoma) from an area inside the body to the outside. Colostomy and urostomy are types of ostomies.
  OTC: Refers to a medicine that can be bought without a prescription (doctor's order). Examples include analgesics (pain relievers), such as aspirin and acetaminophen. Also called nonprescription and over-the-counter.
  otolaryngologist: (OH-toh-LAYR-in-GAH-loh-jist)
    Pronunciation of dictionary term "otolaryngologist"
    A doctor who has special training in diagnosing and treating diseases of the ear, nose, and throat. Also called ENT doctor.
  ounce: (ownts)
    Pronunciation of dictionary term "ounce"
    A measure of weight (one-sixteenth pound) and volume (one-eighth cup).
  out-of-pocket cost: (…PAH-kit …)
    Pronunciation of dictionary term "out-of-pocket cost"
    In medicine, the amount of money a patient pays for medical expenses that are not covered by a health insurance plan. Out-of-pocket costs include deductibles, coinsurance, copayments, and costs for noncovered health care services.
  outcome: (OWT-kum)
    Pronunciation of dictionary term "outcome"
    A specific result or effect that can be measured. Examples of outcomes include decreased pain, reduced tumor size, and improvement of disease.
  outpatient: (OWT-pay-shunt)
    Pronunciation of dictionary term "outpatient"
    A patient who visits a health care facility for diagnosis or treatment without spending the night. Sometimes called a day patient.
  OvaRex: (OH-vuh-REX)
    Pronunciation of dictionary term "OvaRex"
    A monoclonal antibody that is being studied in the treatment of ovarian cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. OvaRex binds to the CA-125 antigen, which is found on most ovarian cancer cells. Also called oregovomab.
  ovarian: (oh-VAYR-ee-un)
    Pronunciation of dictionary term "ovarian"
    Having to do with the ovaries, the female reproductive glands in which the ova (eggs) are formed. The ovaries are located in the pelvis, one on each side of the uterus.
    More Information
    - Ovarian, Fallopian Tube, and Primary Peritoneal Cancer (https://www.cancer.gov/types/ovarian)
  ovarian ablation: (oh-VAYR-ee-un a-BLAY-shun)
    Pronunciation of dictionary term "ovarian ablation"
    Treatment that stops or lowers the amount of estrogen made by the ovaries. Types of ovarian ablation include surgery to remove both ovaries, radiation therapy, and the use of certain drugs. Ovarian ablation may be used to prevent and treat breast cancer. Also called ovarian suppression.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  ovarian borderline malignant tumor: (oh-VAYR-ee-un BOR-der-line muh-LIG-nunt TOO-mer)
    Pronunciation of dictionary term "ovarian borderline malignant tumor"
    A condition in which abnormal cells that may become cancer form in the tissue that covers the ovary (one of a pair of female reproductive glands in which eggs are made). Ovarian borderline malignant tumors rarely spread outside of the ovary. Also called ovarian borderline tumor and ovarian low malignant potential tumor.
  ovarian borderline tumor: (oh-VAYR-ee-un BOR-der-line TOO-mer)
    A condition in which abnormal cells that may become cancer form in the tissue that covers the ovary (one of a pair of female reproductive glands in which eggs are made). Ovarian borderline tumors rarely spread outside of the ovary. Also called ovarian borderline malignant tumor and ovarian low malignant potential tumor.
  ovarian cancer: (oh-VAYR-ee-un KAN-ser)
    Pronunciation of dictionary term "ovarian cancer"
    Cancer that forms in tissues of the ovary (one of a pair of female reproductive glands in which the ova, or eggs, are formed). Most ovarian cancers are either ovarian epithelial cancers (cancer that begins in the cells on the surface of the ovary) or malignant germ cell tumors (cancer that begins in egg cells). Fallopian tube cancer and primary peritoneal cancer are similar to ovarian epithelial cancer and are staged and treated the same way.
    More Information
    - Ovarian, Fallopian Tube, and Primary Peritoneal Cancer (https://www.cancer.gov/types/ovarian)
  ovarian epithelial cancer: (oh-VAYR-ee-un eh-pih-THEE-lee-ul KAN-ser)
    Pronunciation of dictionary term "ovarian epithelial cancer"
    Cancer that forms in the tissue covering the ovary (one of a pair of female reproductive glands in which eggs are made). Most ovarian cancers are ovarian epithelial cancers. Fallopian tube cancer and primary peritoneal cancer are similar to ovarian epithelial cancer and are staged and treated the same way. Also called epithelial ovarian cancer.
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
  ovarian failure: (oh-VAYR-ee-un FAYL-yer)
    Pronunciation of dictionary term "ovarian failure"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. There are two types of ovarian failure, primary and secondary. Primary ovarian failure means that the ovaries do not function normally. This may be because they have been removed by surgery, or it may be caused by some cancer treatments and certain diseases or genetic conditions. In secondary ovarian failure, the ovaries are normal but there is a problem getting hormone signals to them from the brain. This is usually caused by diseases of the pituitary gland or hypothalamus. Some women with ovarian failure sometimes have menstrual periods and may be able to have children. Also called early menopause, ovarian insufficiency, and premature menopause.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovarian follicle: (oh-VAYR-ee-un FAH-lih-kul)
    Pronunciation of dictionary term "ovarian follicle"
    A small, fluid-filled sac in the ovary that contains one immature egg. There are thousands of follicles in the ovaries. When an egg matures during a woman’s menstrual cycle, the follicle breaks open and releases the egg from the ovary for possible fertilization (the process by which an egg combines with sperm to form an embryo). Ovarian follicles may sometimes be checked to help diagnose and treat infertility.
  ovarian germ cell tumor: (oh-VAYR-ee-un jerm sel TOO-mer)
    Pronunciation of dictionary term "ovarian germ cell tumor"
    An abnormal mass of tissue that forms in germ (egg) cells in the ovary (female reproductive gland in which the eggs are formed). These tumors usually occur in teenage girls or young women, usually affect just one ovary, and can be benign (not cancer) or malignant (cancer). The most common ovarian germ cell tumor is called dysgerminoma.
    More Information
    - Ovarian, Fallopian Tube, and Primary Peritoneal Cancer (https://www.cancer.gov/types/ovarian)
  ovarian insufficiency: (oh-VAYR-ee-un IN-suh-FIH-shen-see)
    Pronunciation of dictionary term "ovarian insufficiency"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. There are two types of ovarian insufficiency, primary and secondary. Primary ovarian insufficiency means that the ovaries do not function normally. This may be because they have been removed by surgery, or it may be caused by some cancer treatments and certain diseases or genetic conditions. In secondary ovarian insufficiency, the ovaries are normal but there is a problem getting hormone signals to them from the brain. This is usually caused by diseases of the pituitary gland or hypothalamus. Some women with ovarian insufficiency sometimes have menstrual periods and may be able to have children. Also called early menopause, ovarian failure, and premature menopause.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovarian low malignant potential tumor: (oh-VAYR-ee-un...muh-LIG-nunt poh-TEN-shul TOO-mer)
    Pronunciation of dictionary term "ovarian low malignant potential tumor"
    A condition in which abnormal cells that may become cancer form in the tissue that covers the ovary (one of a pair of female reproductive glands in which eggs are made). Ovarian low malignant potential tumors rarely spread outside of the ovary. Also called ovarian borderline malignant tumor and ovarian borderline tumor.
  ovarian reserve: (oh-VAYR-ee-un reh-SERV)
    Pronunciation of dictionary term "ovarian reserve"
    The total number of healthy, immature eggs in the ovaries. The number of healthy eggs decreases as a woman ages, which can lower fertility (the ability to have children). Damage to the ovaries can also decrease ovarian reserve and fertility. This may be caused by smoking, certain anticancer treatments (such as chemotherapy or radiation therapy), surgery to the ovaries or other organs in the pelvis, and certain diseases or genetic conditions. Ovarian reserve is often checked in women who want to have children and are having problems getting pregnant.
  ovarian shielding: (oh-VAYR-ee-un SHEEL-ding)
    Pronunciation of dictionary term "ovarian shielding"
    A procedure done during radiation therapy in which a protective cover is placed on the outside of the body, over the area of the ovaries and other parts of the female reproductive system (ovaries, fallopian tubes, uterus, cervix, and vagina). This may prevent damage from radiation therapy. Ovarian shielding is a type of fertility preservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovarian suppression: (oh-VAYR-ee-un suh-PREH-shun)
    Pronunciation of dictionary term "ovarian suppression"
    Treatment that stops or lowers the amount of estrogen made by the ovaries. Types of ovarian suppression include surgery to remove both ovaries, radiation therapy, and the use of certain drugs. Ovarian suppression may be used to prevent and treat breast cancer. Also called ovarian ablation.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  ovarian tissue banking: (oh-VAYR-ee-un TIH-shoo BANK-ing)
    Pronunciation of dictionary term "ovarian tissue banking"
    The process of freezing ovarian tissue to save for future infertility treatment. Part or all of an ovary is removed, and the tissue that contains the eggs is cut into thin slices and frozen. The tissue may later be thawed and placed back into the woman’s body, usually on the remaining ovary. Ovarian tissue banking is a type of fertility preservation. It may be useful for women who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Also called ovarian tissue cryopreservation and ovarian tissue freezing.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovarian tissue cryopreservation: (oh-VAYR-ee-un TIH-shoo KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "ovarian tissue cryopreservation"
    The process of freezing ovarian tissue to save for future infertility treatment. Part or all of an ovary is removed, and the tissue that contains the eggs is cut into thin slices and frozen. The tissue may later be thawed and placed back into the woman’s body, usually on the remaining ovary. Ovarian tissue cryopreservation is a type of fertility preservation. It may be useful for women who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Also called ovarian tissue banking and ovarian tissue freezing.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovarian tissue freezing: (oh-VAYR-ee-un TIH-shoo FREE-zing)
    Pronunciation of dictionary term "ovarian tissue freezing"
    The process of freezing ovarian tissue to save for future infertility treatment. Part or all of an ovary is removed, and the tissue that contains the eggs is cut into thin slices and frozen. The tissue may later be thawed and placed back into the woman’s body, usually on the remaining ovary. Ovarian tissue freezing is a type of fertility preservation. It may be useful for women who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Also called ovarian tissue banking and ovarian tissue cryopreservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovarian transposition: (oh-VAYR-ee-un tranz-poh-ZIH-shun)
    Pronunciation of dictionary term "ovarian transposition"
    A procedure used to help keep a woman fertile by preventing damage to the ovaries during radiation therapy. Before radiation therapy begins, one or both ovaries and fallopian tubes are separated from the uterus and attached to the wall of the abdomen away from where the radiation will be given. Ovarian transposition may be useful for women who want to have children after having radiation therapy that can cause infertility. It is a type of fertility preservation. Also called oophoropexy.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  ovary: (OH-vuh-ree)
    Pronunciation of dictionary term "ovary"
    One of a pair of female glands in which the eggs form and the female hormones estrogen and progesterone are made. These hormones play an important role in female traits, such as breast development, body shape, and body hair. They are also involved in the menstrual cycle, fertility, and pregnancy. There is one ovary on each side of the uterus.
    More Information
    - Ovarian, Fallopian Tube, and Primary Peritoneal Cancer (https://www.cancer.gov/types/ovarian)
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  over-the-counter: (OH-ver-the-KOWN-ter)
    Pronunciation of dictionary term "over-the-counter"
    Refers to a medicine that can be bought without a prescription (doctor's order). Examples include analgesics (pain relievers), such as aspirin and acetaminophen. Also called nonprescription and OTC.
  overactive thyroid: (... THY-royd)
    Pronunciation of dictionary term "overactive thyroid"
    A condition that occurs when the thyroid gland makes more thyroid hormones than the body needs. Thyroid hormones control the way the body uses energy and affect the body’s metabolism. Overactive thyroid may be caused by an autoimmune disorder called Graves’ disease, benign lumps in the thyroid gland, and inflammation of the thyroid gland. It may also be caused by consuming too much iodine in the diet or by taking too much thyroid hormone medicine. Signs and symptoms include weight loss, fatigue, rapid or irregular heartbeat, sweating, diarrhea, nervousness, mood swings, shaky hands, trouble sleeping, trouble tolerating heat, muscle weakness, and a goiter (an enlarged thyroid gland that may cause the bottom of the neck to look swollen). Overactive thyroid can usually be controlled with treatment. Also called hyperthyroidism.
  overall survival: (oh-ver-AWL ser-VY-vul)
    Pronunciation of dictionary term "overall survival"
    The length of time from either the date of diagnosis or the start of treatment for a disease, such as cancer, that patients diagnosed with the disease are still alive. In a clinical trial, measuring the overall survival is one way to see how well a new treatment works. Also called OS.
  overall survival rate: (oh-ver-AWL ser-VY-vul rayt)
    Pronunciation of dictionary term "overall survival rate"
    The percentage of people in a study or treatment group who are still alive for a certain period of time after they were diagnosed with or started treatment for a disease, such as cancer. The overall survival rate is often stated as a five-year survival rate, which is the percentage of people in a study or treatment group who are alive five years after their diagnosis or the start of treatment. Also called survival rate.
  overdiagnosis: (OH-ver-DY-ug-NOH-sis)
    Pronunciation of dictionary term "overdiagnosis"
    Finding cases of cancer with a screening test (such as a mammogram or PSA test) that will never cause any symptoms. These cancers may just stop growing or go away on their own. Some of the harms caused by overdiagnosis are anxiety and having treatments that are not needed.
  overdose: (OH-ver-dose)
    Pronunciation of dictionary term "overdose"
    An amount of drug that is more than what should be taken at one time.
  overexpress: (OH-ver-ek-SPRES)
    Pronunciation of dictionary term "overexpress"
    In biology, to make too many copies of a protein or other substance. Overexpression of certain proteins or other substances may play a role in cancer development.
  overgrowth syndrome: (OH-ver-grothe SIN-drome)
    Pronunciation of dictionary term "overgrowth syndrome"
    A group of genetic disorders in which there is an abnormal increase in the size of the body or a body part that is often noted at birth. Examples of overgrowth syndromes include neurofibromatosis, Sotos syndrome, Beckwith-Wiedemann syndrome, Simpson-Golabi-Behmel syndrome, Weaver syndrome, Proteus syndrome, Sturge-Weber syndrome, and fragile X syndrome. Many of these syndromes increase the risk of cancer.
  overtreatment: (OH-ver-TREET-ment)
    Pronunciation of dictionary term "overtreatment"
    Unnecessary treatment for a condition that is not life-threatening or would never cause any symptoms. Overtreatment may lead to problems and harmful side effects. Overtreatment can be a result of overdiagnosis, which occurs when a cancer screening test finds a lesion that would have gone away on its own or not caused problems.
  overweight: (OH-ver-WAYT)
    Pronunciation of dictionary term "overweight"
    A common condition marked by weighing more than what is thought to be healthy for one’s height. Excess body weight can come from extra fat, muscle, and/or fluid in the tissues. Overweight is generally defined as having a body mass index (BMI) between 25 and 29. Factors that may increase a person’s risk of having overweight include a poor diet, stress, not getting enough sleep or exercise, and taking certain medicines. A person’s genetics and some health conditions, such as metabolic syndrome and polycystic ovarian syndrome, can also lead to having overweight. Having overweight can increase the risk of many health problems, including diabetes, high blood pressure, heart disease, stroke, sleep apnea, arthritis, and certain types of cancer.
    More Information
    - Obesity and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity/obesity-fact-sheet)
    - What Are Overweight and Obesity? (https://www.nhlbi.nih.gov/health/overweight-and-obesity)
  ovulation: (ov-yoo-LAY-shun)
    Pronunciation of dictionary term "ovulation"
    The release of an egg from an ovary during the menstrual cycle.
  OX-40: A protein being studied in the treatment of cancer. Substances that attach to OX-40 on the surface of T cells (a type of white blood cell) may help the T cells grow and kill more cancer cells. OX-40 is a type of tumor necrosis factor (TNF) receptor. Also called CD134.
  oxaliplatin: (ok-SA-lih-pla-tin)
    Pronunciation of dictionary term "oxaliplatin"
    A drug used with other drugs to treat stage III colon cancer that was removed by surgery and colorectal cancer that is advanced. It is also being studied in the treatment of other types of cancer. Oxaliplatin damages the cell’s DNA and may kill cancer cells. It is a type of platinum compound. Also called Eloxatin.
    More Information
    - Oxaliplatin (https://www.cancer.gov/about-cancer/treatment/drugs/oxaliplatin)
  oxandrolone: (ok-SAN-droh-lone)
    Pronunciation of dictionary term "oxandrolone"
    A drug used to help patients gain weight after injury, chronic infection, or severe illness. It belongs to the family of drugs called anabolic steroids.
  oxidation: (OK-sih-DAY-shun)
    Pronunciation of dictionary term "oxidation"
    A chemical reaction that takes place when a substance comes into contact with oxygen or another oxidizing substance. Examples of oxidation are rust and the brown color on a cut apple.
  oxidation-reduction: (OK-sih-DAY-shun-ree-DUK-shun)
    Pronunciation of dictionary term "oxidation-reduction"
    A chemical reaction that takes place between an oxidizing substance and a reducing substance. The oxidizing substance loses electrons in the reaction, and the reducing substance gains electrons. For example, rust forms when there is an oxidation-reduction reaction between oxygen contained in water or moist air (an oxidizing substance) and iron (a reducing substance). Oxidation-reduction reactions also occur when glucose (a type of sugar) and fat are broken down in the body to make energy. Also called redox.
  oxidative metabolism: (OK-sih-DAY-tiv meh-TA-buh-lih-zum)
    Pronunciation of dictionary term "oxidative metabolism"
    A chemical process in which oxygen is used to make energy from carbohydrates (sugars). Also called aerobic metabolism, aerobic respiration, and cell respiration.
  oxidative stress: (OK-sih-DAY-tiv ...)
    Pronunciation of dictionary term "oxidative stress"
    A condition that may occur when there are too many unstable molecules called free radicals in the body and not enough antioxidants to get rid of them. This can lead to cell and tissue damage. There are many factors that may lead to oxidative stress, including obesity, poor diet, smoking, drinking alcohol, taking certain medicines, and exposure to environmental factors such as radiation, toxins, air pollution, pesticides, and sunlight. Long-term oxidative stress may play a role in aging and the development of chronic inflammation, cancer, and other diseases.
  oxide: (OK-side)
    Pronunciation of dictionary term "oxide"
    A type of chemical substance that is a combination of oxygen and another substance. Oxides are found in essential oils.
  oxidize: (OK-sih-dize)
    Pronunciation of dictionary term "oxidize"
    To cause oxidation (a chemical reaction that takes place when a substance comes into contact with oxygen or another oxidizing substance).
  oxycodone hydrochloride: (OK-see-KOH-done HY-droh-KLOR-ide)
    Pronunciation of dictionary term "oxycodone hydrochloride"
    A drug used to relieve moderate to severe pain. Oxycodone hydrochloride is made in a lab by modifying thebaine, a natural substance found in the opium poppy plant. It works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and changes how the body responds to pain. Oxycodone hydrochloride is a type of semi-synthetic opioid agonist that works as an analgesic (pain reliever).
  oxygen: (OK-sih-jen)
    Pronunciation of dictionary term "oxygen"
    A colorless, odorless gas. It is needed for animal and plant life. Oxygen that is breathed in enters the blood from the lungs and travels to the tissues.
  oxygen radical: (OK-sih-jen RA-dih-kul)
    Pronunciation of dictionary term "oxygen radical"
    A type of unstable molecule that contains oxygen and that easily reacts with other molecules in a cell. A build up of oxygen radicals in cells may cause damage to DNA, RNA, and proteins, and may cause cell death. An oxygen radical is a free radical. Also called reactive oxygen species.
    More Information
    - Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet)
  oxygen saturation test: (OK-sih-jen SA-chuh-RAY-shun…)
    Pronunciation of dictionary term "oxygen saturation test"
    A test that measures the amount of oxygen being carried by red blood cells. One method uses a device that shines light through a finger. The device measures the amount of oxygen in the blood based on the way red blood cells carrying oxygen absorb and reflect light. In another method blood is taken from an artery and the amount of oxygen is measured directly. An oxygen level that is lower than normal may be a sign of lung disease or other medical conditions.
  oxygen therapy: (OK-sih-jen THAYR-uh-pee)
    Pronunciation of dictionary term "oxygen therapy"
    Treatment in which a storage tank of oxygen or a machine called a compressor is used to give oxygen to people with breathing problems. It may be given through a nose tube, a mask, or a tent. The extra oxygen is breathed in along with normal air. Also called supplemental oxygen therapy.
  oxymorphone hydrochloride: (OK-see-MOR-fone HY-droh-KLOR-ide)
    Pronunciation of dictionary term "oxymorphone hydrochloride"
    A drug used to treat moderate to severe pain. Oxymorphone hydrochloride is made in a lab by modifying thebaine, a natural substance found in the opium poppy plant. It works by binding to mu opioid receptors in the central nervous system, which blocks pain signals and changes how the body responds to pain. Oxymorphone hydrochloride is a type of semi-synthetic opioid agonist that works as an analgesic (pain reliever).
    More Information
    - Cancer Pain
  P-32: A radioactive form of the element phosphorus used in the treatment of cancer.
  p-glycoprotein: (… GLY-koh-PROH-teen)
    Pronunciation of dictionary term "p-glycoprotein"
    A protein that pumps substances out of cells. Cancer cells that have too much p-glycoprotein may not be killed by anticancer drugs.
  p-value: (... VAL-yoo)
    Pronunciation of dictionary term "p-value"
    A term in statistics. It helps show whether a difference found between groups that are being compared is due to chance. A small p-value usually means that the difference between groups is not due to chance alone, but is due to some other factor, such as a treatment one of the groups received. A large p-value usually means that the difference between groups is probably due to chance alone.
  P30 Cancer Center Support Grant: (… KAN-ser SEN-ter suh-PORT …)
    Pronunciation of dictionary term "P30 Cancer Center Support Grant"
    Funds awarded to certain U.S. institutions by the National Cancer Institute (NCI) for them to become cancer centers in the United States, based on scientific merit. The funds help the cancer centers improve the way they are run and develop new ways to prevent, diagnose, and treat cancer. To receive the award, one goal of the cancer center must be to turn clinical and basic research into better health care. Also called CCSG.
  p53 gene: (… jeen)
    Pronunciation of dictionary term "p53 gene"
    A gene that makes a protein that is found inside the nucleus of cells and plays a key role in controlling cell division and cell death. Mutations (changes) in the p53 gene may cause cancer cells to grow and spread in the body. These changes have been found in a genetic condition called Li-Fraumeni syndrome and in many types of cancer. The p53 gene is a type of tumor suppressor gene. Also called TP53 gene and tumor protein p53 gene.
  PA: A health professional who is licensed to do certain medical procedures under the guidance of a doctor. A PA may take medical histories, do physical exams, take blood and urine samples, care for wounds, and give injections and immunizations. Also called physician assistant.
  PABA: A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Bacteria that live in the intestines need PABA to survive. PABA is found in grains and foods from animals. It is being studied as a radiosensitizer (a substance that makes tumor cells more sensitive to radiation therapy) and in the treatment of certain skin disorders. Also called aminobenzoic acid and para-aminobenzoic acid.
  pacemaker: (PAYS-may-ker)
    Pronunciation of dictionary term "pacemaker"
    An electronic device that is implanted in the body to monitor heart rate and rhythm. It gives the heart electrical stimulation when it does not beat normally. It runs on batteries and has long, thin wires that connect it to the heart. Also called artificial pacemaker and cardiac pacemaker.
  Pacific valerian: (puh-SIH-fik vuh-LEER-ee-un)
    Pronunciation of dictionary term "Pacific valerian"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, garden valerian, Indian valerian, Mexican valerian, valerian, Valeriana officinalis, and Valerianae radix.
  pack year: (pak yeer)
    Pronunciation of dictionary term "pack year"
    A way to measure the amount a person has smoked over a long period of time. It is calculated by multiplying the number of packs of cigarettes smoked per day by the number of years the person has smoked. For example, 1 pack year is equal to smoking 1 pack per day for 1 year, or 2 packs per day for half a year, and so on.
  paclitaxel: (PA-klih-TAK-sil)
    Pronunciation of dictionary term "paclitaxel"
    A drug used alone or with other drugs to treat AIDS-related Kaposi sarcoma, advanced ovarian cancer, and certain types of breast cancer and non-small cell lung cancer. It is also being studied in the treatment of other types of cancer. Paclitaxel stops cancer cells from growing and dividing and may kill them. It is a type of taxane.
    More Information
    - Paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel)
  paclitaxel albumin-stabilized nanoparticle formulation: (PA-klih-TAK-sil al-BYOO-min-STAY-bih-lized NA-noh-PAR-tih-kul for-myoo-LAY-shun)
    Pronunciation of dictionary term "paclitaxel albumin-stabilized nanoparticle formulation"
    A form of the anticancer drug paclitaxel that is used alone or with other drugs to treat certain types of breast cancer, non-small cell lung cancer, and pancreatic cancer. Paclitaxel albumin-stabilized nanoparticle formulation may have fewer side effects and work better than other forms of paclitaxel. It is also being studied in the treatment of other types of cancer. Paclitaxel albumin-stabilized nanoparticle formulation stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called ABI-007, Abraxane, nanoparticle paclitaxel, and protein-bound paclitaxel.
    More Information
    - Paclitaxel Albumin-stabilized Nanoparticle Formulation (https://www.cancer.gov/about-cancer/treatment/drugs/nanoparticlepaclitaxel)
  paclitaxel liposome: (PA-klih-TAK-sil LY-poh-some)
    Pronunciation of dictionary term "paclitaxel liposome"
    A form of the anticancer drug paclitaxel that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of several types of cancer. Paclitaxel liposome blocks the ability of cells to divide and may kill cancer cells. It is a type of mitotic inhibitor and a type of antimicrotubule agent. Also called LEP-ETU, liposomal paclitaxel, LipoTaxen, and PNU-93914.
  paclitaxel poliglumex: (PA-klih-TAK-sil PAH-lee-GLOO-mex)
    Pronunciation of dictionary term "paclitaxel poliglumex"
    A form of the anticancer drug paclitaxel combined with a protein called poliglumex that may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of breast cancer, ovarian cancer, lung cancer, and other types of cancer. It belongs to the family of drugs called mitotic inhibitors. Also called CT-2103, paclitaxel polyglutamate, and Xyotax.
  paclitaxel polyglutamate: (PA-klih-TAK-sil PAH-lee-GLOO-tuh-mayt)
    Pronunciation of dictionary term "paclitaxel polyglutamate"
    A form of the anticancer drug paclitaxel combined with a protein called poliglumex that may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of breast cancer, ovarian cancer, lung cancer, and other types of cancer. It belongs to the family of drugs called mitotic inhibitors. Also called CT-2103, paclitaxel poliglumex, and Xyotax.
  paclitaxel-loaded polymeric micelle: (PA-klih-TAK-sil-LOH-ded PAH-lih-MAYR-ik MY-sel)
    Pronunciation of dictionary term "paclitaxel-loaded polymeric micelle"
    A form of the anticancer drug paclitaxel used to treat breast cancer, ovarian cancer, and AIDS-related Kaposi sarcoma. It is also used with another drug to treat non-small cell lung cancer. Paclitaxel is mixed with very tiny particles of a substance that makes it easier to dissolve in water. This allows higher doses of paclitaxel to be given. It is a type of antimitotic agent.
  pacritinib citrate: (pak-RIH-tih-nib SIH-trayt)
    Pronunciation of dictionary term "pacritinib citrate"
    A drug used to treat adults with intermediate-risk or high-risk myelofibrosis (MF), including primary MF, post-polycythemia vera MF, and post-essential thrombocythemia MF. It is used in patients who have a very low blood platelet count. It is also being studied in the treatment of other conditions and some types of cancer. Pacritinib citrate blocks JAK2 and other proteins, which may help keep abnormal blood cells or cancer cells from growing. It is a type of kinase inhibitor. Also called Vonjo.
    More Information
    - Pacritinib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/pacritinib-citrate)
  PAD: An abbreviation for a chemotherapy combination used to treat multiple myeloma. It includes the drugs bortezomib, doxorubicin (Adriamycin), and dexamethasone. Also called PAD regimen.
    More Information
    - PAD (https://www.cancer.gov/about-cancer/treatment/drugs/PAD)
  PAD regimen: (... REH-jih-men)
    Pronunciation of dictionary term "PAD regimen"
    An abbreviation for a chemotherapy combination used to treat multiple myeloma. It includes the drugs bortezomib, doxorubicin (Adriamycin), and dexamethasone. Also called PAD.
    More Information
    - PAD (https://www.cancer.gov/about-cancer/treatment/drugs/PAD)
  Padcev: (PAD-sev)
    Pronunciation of dictionary term "Padcev"
    A drug used alone or with pembrolizumab to treat adults with certain types of urothelial cancer (a type of cancer in the bladder or urinary tract) that have spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Padcev contains a monoclonal antibody that binds to a protein called nectin-4, which is found on some cancer cells. It also contains an anticancer drug, which may help kill cancer cells. Padcev may also help the immune system kill cancer cells. It is a type of antibody-drug conjugate. Also called enfortumab vedotin.
    More Information
    - Enfortumab Vedotin-ejfv (https://www.cancer.gov/about-cancer/treatment/drugs/enfortumabvedotin-ejfv)
  Paget disease of bone: (PA-jet dih-ZEEZ ...)
    Pronunciation of dictionary term "Paget disease of bone"
    A chronic condition in which both the breakdown and regrowth of bone are increased. Paget disease of bone occurs most frequently in the pelvic and leg bones, skull, and lower spine. It is most common in older individuals, and may lead to bone pain, deformities, and fractures. Also called osteitis deformans.
  Paget disease of the breast: (PA-jet dih-ZEEZ ...)
    Pronunciation of dictionary term "Paget disease of the breast"
    A rare type of breast cancer that involves the nipple and, usually, the areola (the darker circle of skin around the nipple). Symptoms of Paget disease of the breast include itching, tingling, or redness in the nipple and/or areola; flaking, crusty, or thickened skin on or around the nipple; a flattened nipple; and yellowish or bloody discharge from the nipple. The affected breast may also have one or more tumors. Most people with Paget disease of the breast also have ductal carcinoma in situ (stage 0 breast cancer) or invasive breast cancer. Also called mammary Paget disease and Paget disease of the nipple.
    More Information
    - Paget Disease of the Breast (https://www.cancer.gov/types/breast/paget-breast-fact-sheet)
    Paget disease of the breast is a rare type of cancer involving the nipple and usually the areola (the darker circle of skin around the nipple). Symptoms usually include redness in the nipple and/or areola and itchy, crusty, flaking, or thickened skin on or around the nipple.
    Illustration of Paget disease of the breast. Drawing shows a front view of the breast with redness and crusting of the nipple and areola. Also shown is a cross section of the breast with cancer cells in the breast ducts.
  Paget disease of the nipple: (PA-jet dih-ZEEZ ...)
    Pronunciation of dictionary term "Paget disease of the nipple"
    A rare type of breast cancer that involves the nipple and, usually, the areola (the darker circle of skin around the nipple). Symptoms of Paget disease of the nipple include itching, tingling, or redness in the nipple and/or areola; flaking, crusty, or thickened skin on or around the nipple; a flattened nipple; and yellowish or bloody discharge from the nipple. The affected breast may also have one or more tumors. Most people with Paget disease of the nipple also have ductal carcinoma in situ (stage 0 breast cancer) or invasive breast cancer. Also called mammary Paget disease and Paget disease of the breast.
    More Information
    - Paget Disease of the Breast (https://www.cancer.gov/types/breast/paget-breast-fact-sheet)
    Paget disease of the breast is a rare type of cancer involving the nipple and usually the areola (the darker circle of skin around the nipple). Symptoms usually include redness in the nipple and/or areola and itchy, crusty, flaking, or thickened skin on or around the nipple.
    Illustration of Paget disease of the breast. Drawing shows a front view of the breast with redness and crusting of the nipple and areola. Also shown is a cross section of the breast with cancer cells in the breast ducts.
  PAH: A type of chemical formed when coal, oil, gas, garbage, tobacco, meat, and other substances are burned. These chemicals are also made for use in many products, including coal tar, creosote, roofing tar, pesticides, mothballs, dandruff shampoos, and some medicines. Being exposed to one of these chemicals over a long time may cause cancer. Also called polycyclic aromatic hydrocarbon.
  pain expression: (payn ek-SPREH-shun)
    Pronunciation of dictionary term "pain expression"
    Refers to the way in which a person shows that he or she is in pain. People can express pain verbally or through changes in behavior, such as crying, moaning, groaning, facial grimacing, restlessness, agitation, or depression. Other examples of pain expression include trouble moving around (such as limping), guarding an area of pain on the body, flinching when touched, and trouble sleeping or eating. People may express pain in different ways depending on many external factors, including their family, social interactions, and culture.
    More Information
    - Pain in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
    - Cancer Pain
  pain flare: (payn flayr)
    Pronunciation of dictionary term "pain flare"
    A sudden increase in pain that may occur in patients who already have chronic pain from cancer, arthritis, fibromyalgia, or other conditions. A pain flare usually lasts for a short time. During a pain flare, the level of pain may be severe but the type of pain and where it is in the body are usually the same as the patient’s chronic pain. Pain flares may occur with stress, illness, and certain activities, such as exercising or coughing, or when the dose of pain medicine that the patient is taking wears off. Pain flares are usually not a symptom of a new condition or a condition that has gotten worse. Also called breakthrough pain.
    More Information
    - Cancer Pain
    - Pain in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
  pain threshold: (payn THRESH-holde)
    Pronunciation of dictionary term "pain threshold"
    The point at which a person becomes aware of pain.
    More Information
    - Pain in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
    - Cancer Pain
  PALA: A substance that is being studied for its ability to increase the effectiveness of the anticancer drug fluorouracil.
  palate: (PAL-et)
    Pronunciation of dictionary term "palate"
    The roof of the mouth. The front portion is bony (hard palate), and the back portion is muscular (soft palate).
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  palatine uvula: (PA-luh-teen YOO-vyoo-luh)
    Pronunciation of dictionary term "palatine uvula"
    The soft flap of tissue that hangs down at the back of the mouth (at the edge of the soft palate). Also called uvula.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  palbociclib: (PAL-boh-SY-klib)
    Pronunciation of dictionary term "palbociclib"
    A drug used to treat women and men with certain types of hormone-receptor positive, HER2-negative breast cancer that is advanced or has spread. It is also being studied in the treatment of other types of cancer. Palbociclib blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Also called Ibrance.
    More Information
    - Palbociclib (https://www.cancer.gov/about-cancer/treatment/drugs/palbociclib)
  palifermin: (pa-lee-FER-min)
    Pronunciation of dictionary term "palifermin"
    A drug used to prevent and treat severe oral mucositis (mouth sores). It is used in patients with blood cancer who are being treated with high-dose chemotherapy and radiation therapy followed by an autologous stem cell transplant. It is also being studied in the prevention and treatment of common side effects in other types of cancer. Palifermin is a form of human keratinocyte growth factor that is made in the laboratory. It binds to certain receptors on the surface of cells in the lining of the mouth, stomach, and intestines. This may help protect healthy tissue from some of the side effects caused by certain types of cancer treatment. Palifermin is a type of cytoprotective agent. Also called Kepivance.
    More Information
    - Palifermin (https://www.cancer.gov/about-cancer/treatment/drugs/palifermin)
  palliation: (PA-lee-AY-shun)
    Pronunciation of dictionary term "palliation"
    Relief of symptoms and suffering caused by cancer and other life-threatening diseases. Palliation helps a patient feel more comfortable and improves the quality of life, but does not cure the disease.
    More Information
    - Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet)
    - Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
  palliative care: (PA-lee-uh-tiv kayr)
    Pronunciation of dictionary term "palliative care"
    Care given to improve the quality of life and help reduce pain in people who have a serious or life-threatening disease, such as cancer. The goal of palliative care is to prevent or treat, as early as possible, the symptoms of the disease and the side effects caused by treatment of the disease. It also attends to the psychological, social, and spiritual problems caused by the disease or its treatment. For cancer, palliative care may include therapies, such as surgery, radiation therapy, or chemotherapy, to remove, shrink, or slow the growth of a tumor that is causing pain. It may also include family and caregiver support. Palliative care may be given with other treatments from the time of diagnosis until the end of life.
    More Information
    - Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet)
    - Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
    - PDQ® Cancer Information Summaries: Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care)
  palliative care specialist: (PA-lee-uh-tiv kayr SPEH-shuh-list)
    Pronunciation of dictionary term "palliative care specialist"
    A health care professional who has special training in providing care to people who have a serious or life-threatening disease, such as cancer. Palliative care specialists prevent or treat as early as possible the symptoms of a disease, side effects caused by treatment of a disease, and psychological, social, and spiritual problems related to a disease or its treatment. They also provide family and caregiver support and coordinate communication between other members of the health care team.
    More Information
    - Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet)
    - PDQ® Cancer Information Summaries: Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care)
  palliative sedation: (PA-lee-uh-tiv seh-DAY-shun)
    Pronunciation of dictionary term "palliative sedation"
    The use of special drugs called sedatives to relieve extreme suffering by making a patient calm, unaware, or unconscious. This may be done for patients who have symptoms that cannot be controlled with other treatment. Palliative sedation may be used in patients who are near the end of life to make them more comfortable. It is not meant to shorten life or cause death.
    More Information
    - Last Days of Life
  palliative therapy: (PA-lee-uh-tiv THAYR-uh-pee)
    Pronunciation of dictionary term "palliative therapy"
    Treatment given to help relieve the symptoms and reduce the suffering caused by cancer or other life-threatening diseases. Palliative therapy may help a person feel more comfortable, but it does not treat or cure the disease. For example, surgery, radiation therapy, or chemotherapy may be given to remove, shrink, or slow the growth of a tumor that is causing pain. Palliative therapy may be given with other treatments from the time of diagnosis until the end of life.
    More Information
    - Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet)
    - Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
  palmar pit: (PAL-mer ...)
    Pronunciation of dictionary term "palmar pit"
    A tiny dent in the skin on the palm of the hand. Palmar pits are usually pink or skin-colored and can often be seen more easily after soaking the hands in water. They are often found in people with a rare, inherited condition called basal cell nevus syndrome (BCNS). People with BCNS have a very high risk of developing basal cell skin cancer and are also at risk of developing other types of cancer, including medulloblastoma.
    Palmar pits are small depressions in the skin on the palm of the hand that may be seen in individuals with basal cell nevus syndrome, a hereditary syndrome associated with the development of basal cell carcinoma. Depressions may also be seen on the sole of the foot (plantar pits, not shown).
    Photograph showing three small, flesh-colored depressions on the palm of the hand.
    Palmar pits are small depressions in the skin on the palm of the hand that may be seen in individuals with basal cell nevus syndrome, a hereditary syndrome associated with the development of basal cell carcinoma. Depressions may also be seen on the sole of the foot (plantar pits, not shown).
    Photograph showing three small, flesh-colored depressions on the palm of the hand.
  palmar-plantar erythrodysesthesia: (PAL-mer-PLAN-ter eh-RITH-roh-DIS-es-THEE-zhuh)
    Pronunciation of dictionary term "palmar-plantar erythrodysesthesia"
    A condition marked by pain, swelling, numbness, tingling, or redness of the hands or feet. It sometimes occurs as a side effect of certain anticancer drugs. Also called hand-foot syndrome.
  palonosetron hydrochloride: (pa-loh-NOH-seh-tron HY-droh-KLOR-ide)
    Pronunciation of dictionary term "palonosetron hydrochloride"
    A drug used in adults and children aged 1 month and older to prevent nausea and vomiting caused by chemotherapy and nausea and vomiting after surgery. Palonosetron hydrochloride blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Palonosetron hydrochloride is a type of antiemetic and a type of serotonin receptor antagonist. Also called Aloxi.
    More Information
    - Palonosetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/palonosetronhydrochloride)
  palpable disease: (PAL-puh-bul dih-ZEEZ)
    Pronunciation of dictionary term "palpable disease"
    A term used to describe cancer that can be felt by touch, usually present in lymph nodes, skin, or other organs of the body such as the liver or colon.
  palpation: (pal-PAY-shun)
    Pronunciation of dictionary term "palpation"
    Examination by pressing on the surface of the body to feel the organs or tissues underneath.
  palpitation: (PAL-pih-TAY-shun)
    Pronunciation of dictionary term "palpitation"
    A rapid or irregular heartbeat that a person can feel.
  Pamelor: (PA-meh-lor)
    Pronunciation of dictionary term "Pamelor"
    A drug used to treat depression. It may also be used to treat panic or anxiety disorders and certain types of pain, and to help people quit smoking. Pamelor increases the levels of norepinephrine and other natural chemicals in the brain. This helps improve mood and may reduce a person’s craving for nicotine. It is a type of tricyclic antidepressant. Also called Aventyl and nortriptyline.
  pamidronate disodium: (puh-MIH-droh-nayt dy-SOH-dee-um)
    Pronunciation of dictionary term "pamidronate disodium"
    A drug used to treat hypercalcemia (high blood levels of calcium) caused by cancer and bone damage caused by multiple myeloma or by breast cancer that has spread to the bone. It is also used to treat Paget disease of the bone. It is also being studied in the treatment of other types of cancer. Pamidronate disodium may help keep bone from breaking down and prevent the loss of calcium from the bones. It is a type of bisphosphonate. Also called Aredia.
    More Information
    - Pamidronate Disodium (https://www.cancer.gov/about-cancer/treatment/drugs/pamidronatedisodium)
  panacea: (PA-nuh-SEE-uh)
    Pronunciation of dictionary term "panacea"
    A cure-all.
  Pancoast tumor: (PAN-koste TOO-mer)
    Pronunciation of dictionary term "Pancoast tumor"
    A type of lung cancer that begins in the upper part of a lung and spreads to nearby tissues such as the ribs and vertebrae. Most Pancoast tumors are non-small cell cancers. Also called pulmonary sulcus tumor.
  pancreas: (PAN-kree-us)
    Pronunciation of dictionary term "pancreas"
    A glandular organ located in the abdomen. It makes pancreatic juices, which contain enzymes that aid in digestion, and it produces several hormones, including insulin. The pancreas is surrounded by the stomach, intestines, and other organs.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
    Anatomy of the pancreas. The pancreas has three areas: the head, body, and tail. It is found in the abdomen near the stomach, intestines, and other organs.
    Anatomy of the pancreas; drawing shows the pancreas, stomach, spleen, liver, bile ducts, gallbladder, small intestine, and colon. An inset shows the head, body, and tail of the pancreas. The bile duct and pancreatic duct are also shown.
  pancreatectomy: (PAN-kree-uh-TEK-toh-mee)
    Pronunciation of dictionary term "pancreatectomy"
    Surgery to remove all or part of the pancreas. In a total pancreatectomy, part of the stomach, part of the small intestine, the common bile duct, gallbladder, spleen, and nearby lymph nodes also are removed.
  pancreatic: (PAN-kree-A-tik)
    Pronunciation of dictionary term "pancreatic"
    Having to do with the pancreas.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  pancreatic cancer: (PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "pancreatic cancer"
    Cancer that forms in the tissues of the pancreas. The pancreas is an organ in the abdomen that helps the body digest and use the energy that comes from food. Pancreatic cancer occurs when cells in the pancreas grow out of control and form a tumor. Pancreatic cancer can develop in exocrine pancreas cells, which produce digestive juices. It can also develop in endocrine pancreas cells, which produce hormones. Most pancreatic cancers begin in exocrine cells and are usually found at an advanced stage. Pancreatic endocrine cancers are less common but tend to have a better prognosis.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  pancreatic duct: (PAN-kree-A-tik dukt)
    Pronunciation of dictionary term "pancreatic duct"
    Part of a system of ducts in the pancreas. Pancreatic juices containing enzymes are released into these ducts and flow into the small intestine.
  pancreatic ductal adenocarcinoma: (PAN-kree-A-tik DUK-tul A-deh-noh-KAR-sih-NOH-muh)
    The most common type of pancreatic cancer. Pancreatic ductal adenocarcinoma forms in exocrine cells of the pancreas. Exocrine pancreas cells make up the glands and ducts that produce enzymes (digestive juices) to help with digestion. Pancreatic ductal adenocarcinoma occurs when exocrine cells grow out of control and form a tumor. Factors that may increase a person’s risk of developing pancreatic ductal adenocarcinoma include having a family history of the disease, chronic pancreatitis (inflammation of the pancreas), certain genetic syndromes, type 2 diabetes, excess body weight or obesity, exposure to certain chemicals, and smoking. It is usually found at an advanced stage because it usually does not cause symptoms early on. Also called PDAC.
  pancreatic endocrine cancer: (PAN-kree-A-tik EN-doh-krin KAN-ser)
    Pronunciation of dictionary term "pancreatic endocrine cancer"
    A rare cancer that forms in islet cells (hormone-making cells) of the pancreas. Islet cells make several different hormones that affect body functions, including controlling the amount of glucose (sugar) in the blood and helping digest food in the stomach. Functional pancreatic endocrine cancers make extra amounts of these hormones, which can cause symptoms. Nonfunctional pancreatic endocrine cancers do not make extra amounts of hormones, but they may cause symptoms as they grow and spread. Also called islet cell carcinoma.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  pancreatic endocrine tumor: (PAN-kree-A-tik EN-doh-krin TOO-mer)
    Pronunciation of dictionary term "pancreatic endocrine tumor"
    A tumor that forms in islet cells (hormone-making cells) of the pancreas. Pancreatic endocrine tumors may be benign (not cancer) or malignant (cancer). Islet cells make several different hormones that affect body functions, including controlling the amount of glucose (sugar) in the blood and helping digest food in the stomach. Functional pancreatic endocrine tumors make extra amounts of these hormones, which can cause symptoms. Nonfunctional pancreatic endocrine tumors do not make extra amounts of hormones, but they may cause symptoms as they grow and spread. Also called islet cell tumor and pancreatic neuroendocrine tumor.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  pancreatic enzyme: (PAN-kree-A-tik EN-zime)
    Pronunciation of dictionary term "pancreatic enzyme"
    A protein secreted by the pancreas that aids in the digestion of food.
  pancreatic exocrine cancer: (PAN-kree-A-tik EK-soh-krin KAN-ser)
    Pronunciation of dictionary term "pancreatic exocrine cancer"
    A cancer that forms in exocrine cells of the pancreas. Exocrine pancreas cells make up the glands and ducts that produce enzymes (digestive juices) to help with digestion. The most common pancreatic exocrine cancer is pancreatic ductal adenocarcinoma, which is also the most common type of pancreatic cancer. Pancreatic exocrine cancer is usually found at an advanced stage because it usually does not cause symptoms early on.
  pancreatic exocrine tumor: (PAN-kree-A-tik EK-soh-krin TOO-mer)
    Pronunciation of dictionary term "pancreatic exocrine tumor"
    A tumor that forms in exocrine cells of the pancreas. Exocrine pancreas cells make up the glands and ducts that produce enzymes (digestive juices) to help with digestion. Pancreatic exocrine tumors may be benign (not cancer) or malignant (cancer). The most common malignant type is pancreatic ductal adenocarcinoma, which is also the most common type of pancreatic cancer. Malignant pancreatic exocrine tumors are usually found at an advanced stage because they usually do not cause symptoms early on.
  pancreatic function test: (PAN-kree-A-tik FUNK-shun …)
    Pronunciation of dictionary term "pancreatic function test"
    A test used to measure the ability of the pancreas to respond to a hormone called secretin. Secretin causes the pancreas, liver, and stomach to release substances that help digest food. During a pancreatic function test, a tube is inserted through the nose or throat into the stomach and small intestine. Secretin is given to the patient by injection into a vein. After a certain amount of time, samples of fluid are taken from the small intestine through the tube and sent to a lab to test for a response. A pancreatic function test may be used to help diagnose problems that affect the pancreas, such as pancreatitis, cystic fibrosis, and a type of pancreatic tumor called a gastrinoma. Also called secretin stimulation test.
  pancreatic insulin-producing tumor: (PAN-kree-A-tik IN-suh-lin-proh-DOO-sing TOO-mer)
    Pronunciation of dictionary term "pancreatic insulin-producing tumor"
    An abnormal mass that grows in the beta cells of the pancreas that make insulin. Pancreatic insulin-producing tumors are usually benign (not cancer). They secrete insulin and are the most common cause of low blood sugar caused by having too much insulin in the body. Also called beta cell neoplasm, beta cell tumor of the pancreas, and insulinoma.
  pancreatic juice: (PAN-kree-A-tik joos)
    Pronunciation of dictionary term "pancreatic juice"
    Fluid made by the pancreas. Pancreatic juices contain proteins called enzymes that aid in digestion.
  pancreatic neuroendocrine tumor: (PAN-kree-A-tik NOOR-oh-EN-doh-krin TOO-mer)
    Pronunciation of dictionary term "pancreatic neuroendocrine tumor"
    A tumor that forms in islet cells (hormone-making cells) of the pancreas. Pancreatic neuroendocrine tumors may be benign (not cancer) or malignant (cancer). Islet cells make several different hormones that affect body functions, including controlling the amount of glucose (sugar) in the blood and helping digest food in the stomach. Functional pancreatic neuroendocrine tumors make extra amounts of these hormones, which can cause symptoms. Nonfunctional pancreatic neuroendocrine tumors do not make extra amounts of hormones, but they may cause symptoms as they grow and spread. Also called islet cell tumor and pancreatic endocrine tumor.
    More Information
    - Pancreatic Cancer (https://www.cancer.gov/types/pancreatic)
  pancreatic polypeptide: (PAN-kree-A-tik PAH-lee-PEP-tide)
    Pronunciation of dictionary term "pancreatic polypeptide"
    A small protein made by the pancreas that helps control the release of other substances made by the pancreas. The amount of pancreatic polypeptide in the blood increases after a person eats. It may also increase with age, and in certain diseases, such as diabetes and pancreatic cancer. Also called PP.
  pancreatic tumor: (PAN-kree-A-tik TOO-mer)
    Pronunciation of dictionary term "pancreatic tumor"
    A tumor that forms in the cells of the pancreas. The two main types of pancreatic tumors are pancreatic exocrine tumors and pancreatic neuroendocrine tumors. Most pancreatic cancers are exocrine tumors, which form in cells that make enzymes to help the body digest food. Pancreatic neuroendocrine tumors form in neuroendocrine pancreas cells (such as islet cells). These cells make hormones that help control sugar levels in the blood. Pancreatic neuroendocrine tumors may be benign (not cancer) or malignant (cancer). They are much less common than pancreatic exocrine tumors and have a better prognosis.
  pancreatitis: (PAN-kree-uh-TY-tis)
    Pronunciation of dictionary term "pancreatitis"
    Inflammation of the pancreas. Chronic pancreatitis may cause diabetes and problems with digestion. Pain is the primary symptom.
  pancreatoduodenectomy: (PAN-kree-uh-toh-DOO-ah-deh-NEK-toh-mee)
    Pronunciation of dictionary term "pancreatoduodenectomy"
    A type of surgery used to treat pancreatic cancer. The head of the pancreas, the duodenum, a portion of the stomach, and other nearby tissues are removed. Also called Whipple procedure.
  pancytopenia: (pan-SY-toh-PEE-nee-uh)
    Pronunciation of dictionary term "pancytopenia"
    A condition in which there is a lower-than-normal number of red and white blood cells and platelets in the blood. Pancytopenia occurs when there is a problem with the blood-forming stem cells in the bone marrow. Signs and symptoms include fatigue, weakness, dizziness, trouble breathing, fast heartbeat, fever, pale skin, purple or red spots on the skin, rash, easy bruising, and abnormal bleeding. Pancytopenia may be caused by certain autoimmune, bone marrow, or genetic disorders. It may also be caused by infection, poor nutrition, pregnancy, cancer treatment (such as chemotherapy or radiation therapy), or exposure to certain toxins, chemicals, or medicines.
  panhypopituitarism: (pan-HY-poh-pih-TOO-ih-tuh-rih-zum)
    Pronunciation of dictionary term "panhypopituitarism"
    A rare condition in which the pituitary gland stops making most or all hormones. Pituitary hormones help control the way many parts of the body work. Symptoms of the condition depend on the hormones that are missing. They include growth problems (in children), obesity (in adults), hair loss, slow heart rate, low blood sugar, low blood pressure, fatigue, and problems with reproduction. This condition may be caused by a tumor on or near the pituitary gland, infection, stroke, injury, surgery, or radiation therapy. It may also be inherited. Also called PHP.
  panic: (PA-nik)
    Pronunciation of dictionary term "panic"
    Sudden extreme anxiety or fear that may cause irrational thoughts or actions. Panic may include rapid heart rate, flushing (a hot, red face), sweating, and trouble breathing.
    More Information
    - Adjustment to Cancer: Anxiety and Distress
  panic disorder: (PA-nik dis-OR-der)
    Pronunciation of dictionary term "panic disorder"
    A type of anxiety disorder in which a person has repeated panic attacks when there is no actual danger. Panic attacks are sudden periods of intense anxiety or fear that may cause irrational thoughts or actions. During a panic attack, a person may experience chest pain, trouble breathing, a fast heartbeat, sweating, shaking, dizziness, and feelings of impending doom or being out of control. Panic attacks may last for several minutes or longer. People with a panic disorder often worry that the panic attacks will happen again and try to avoid places or situations in which they have occurred.
    More Information
    - Adjustment to Cancer: Anxiety and Distress
  panitumumab: (PAN-ih-TOO-myoo-mab)
    Pronunciation of dictionary term "panitumumab"
    A drug used alone or with other drugs to treat certain types of colorectal cancer that have spread to other parts of the body. It is used in patients whose cancer has not already been treated or has gotten worse after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Panitumumab binds to a protein called epidermal growth factor receptor (EGFR), which is found on some normal cells and some types of cancer cells. Blocking this protein may help keep cancer cells from growing. Panitumumab is a type of monoclonal antibody. Also called ABX-EGF and Vectibix.
    More Information
    - Panitumumab (https://www.cancer.gov/about-cancer/treatment/drugs/panitumumab)
  panobinostat lactate: (PA-noh-BIH-noh-stat LAK-tayt)
    Pronunciation of dictionary term "panobinostat lactate"
    A drug used with bortezomib and dexamethasone to treat multiple myeloma. It is used in patients whose cancer has already been treated with at least two other therapies, including bortezomib and an immunomodulating agent. It is also being studied in the treatment of other types of cancer. Panobinostat lactate blocks certain enzymes, which may help keep cancer cells from growing and dividing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Panobinostat lactate is a type of histone deacetylase inhibitor and a type of antiangiogenesis agent.
    More Information
    - Panobinostat Lactate
  pantothenic acid: (PAN-toh-THEH-nik A-sid)
    Pronunciation of dictionary term "pantothenic acid"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Pantothenic acid helps some enzymes use foods and make many substances used in the body and protects cells against damage from peroxides. It is found in almost all plant and animal foods. Pantothenic acid is water-soluble (can dissolve in water) and must be taken in every day. Also called vitamin B5.
  PANVAC-V: A cancer vaccine made with a form of vaccinia virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins, including the tumor markers called CEA and MUC-1, that may help immune cells in the body kill tumor cells. Also called inalimarev and recombinant vaccinia-CEA-MUC-1-TRICOM vaccine.
  PAP: An enzyme produced by the prostate. It may be found in increased amounts in men who have prostate cancer. Also called prostatic acid phosphatase.
  Pap smear: (pap smeer)
    Pronunciation of dictionary term "Pap smear"
    A procedure in which a small brush is used to gently remove cells from the surface of the cervix and the area around it so they can be checked under a microscope for cervical cancer or cell changes that may lead to cervical cancer. A Pap smear may also help find other conditions, such as infections or inflammation. It is usually done at the same time as a pelvic exam and may also be done at the same time as a test for certain types of human papillomavirus (HPV). Also called Pap test and Papanicolaou test.
    More Information
    - Cervical Cancer Screening
    Pap test. A speculum is inserted into the vagina to widen it. Then, a brush is inserted into the vagina to collect cells from the cervix. The cells are checked under a microscope for signs of disease.
    Pap test; drawing shows a side view of the female reproductive anatomy during a Pap test. A speculum is shown widening the opening of the vagina. A brush is shown inserted into the open vagina and touching the cervix at the base of the uterus. The rectum is also shown. One inset shows the brush touching the center of the cervix. A second inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
  Pap test: A procedure in which a small brush is used to gently remove cells from the surface of the cervix and the area around it so they can be checked under a microscope for cervical cancer or cell changes that may lead to cervical cancer. A Pap test may also help find other conditions, such as infections or inflammation. It is usually done at the same time as a pelvic exam and may also be done at the same time as a test for certain types of human papillomavirus (HPV). Also called Pap smear and Papanicolaou test.
    More Information
    - Cervical Cancer Screening
    Pap test. A speculum is inserted into the vagina to widen it. Then, a brush is inserted into the vagina to collect cells from the cervix. The cells are checked under a microscope for signs of disease.
    Pap test; drawing shows a side view of the female reproductive anatomy during a Pap test. A speculum is shown widening the opening of the vagina. A brush is shown inserted into the open vagina and touching the cervix at the base of the uterus. The rectum is also shown. One inset shows the brush touching the center of the cervix. A second inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
  Pap/HPV cotest: A procedure in which a human papillomavirus (HPV) test and a Pap test are done at the same time to check for cervical cancer. The HPV test looks for DNA or RNA from certain high-risk types of HPV in samples of cells taken from the cervix. The Pap test checks for cervical cancer cells and cell changes that may lead to cervical cancer. The same cell sample may be used for both the HPV test and the Pap test. Women aged 30 to 65 years may have a Pap/HPV cotest every 5 years. Cotesting is more likely to find abnormal cells or cervical cancer than a Pap test alone is. Also called HPV/Pap cotest.
    More Information
    - Cervical Cancer Screening
  Papanicolaou test: (PA-puh-NIH-koh-low...)
    Pronunciation of dictionary term "Papanicolaou test"
    A procedure in which a small brush is used to gently remove cells from the surface of the cervix and the area around it so they can be checked under a microscope for cervical cancer or cell changes that may lead to cervical cancer. A Papanicolaou test may also help find other conditions, such as infections or inflammation. It is usually done at the same time as a pelvic exam and may also be done at the same time as a test for certain types of human papillomavirus (HPV). Also called Pap smear and Pap test.
    More Information
    - Cervical Cancer Screening
    Pap test. A speculum is inserted into the vagina to widen it. Then, a brush is inserted into the vagina to collect cells from the cervix. The cells are checked under a microscope for signs of disease.
    Pap test; drawing shows a side view of the female reproductive anatomy during a Pap test. A speculum is shown widening the opening of the vagina. A brush is shown inserted into the open vagina and touching the cervix at the base of the uterus. The rectum is also shown. One inset shows the brush touching the center of the cervix. A second inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
  papillary dermis: (PA-pih-LAYR-ee DER-mis)
    Pronunciation of dictionary term "papillary dermis"
    The thin top layer of the dermis (the inner layer of the skin). The papillary dermis has connective tissue and blood vessels that give nutrients to the epidermis (the outer layer of the skin) and that help control the temperature of the skin.
  papillary intralymphatic angioendothelioma: (PA-pih-LAYR-ee IN-truh-lim-FA-tik AN-jee-oh-EN-doh-THEE-lee-oh-muh)
    Pronunciation of dictionary term "papillary intralymphatic angioendothelioma"
    A rare, slow-growing tumor of blood vessels that forms in or under the skin anywhere on the body. Papillary intralymphatic angioendotheliomas may appear as firm, raised, purplish bumps, which may be small or large. They usually do not spread to other parts of the body. Papillary intralymphatic angioendotheliomas can occur in children and adults. They are a type of vascular tumor. Also called Dabska tumor.
  papillary kidney cancer: (PA-pih-LAYR-ee KID-nee KAN-ser)
    Pronunciation of dictionary term "papillary kidney cancer"
    A type of kidney cancer that forms in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Most papillary tumors look like long, thin finger-like growths under a microscope. There are two types of papillary kidney cancer: type 1 and type 2. Type 1 tends to grow slowly and spread to other parts of the body less often than type 2. Patients with a genetic disorder called hereditary papillary renal cancer have an increased risk of type 1 papillary kidney cancer. Patients with a genetic disorder called hereditary leiomyomatosis and renal cell cancer have an increased risk of type 2 papillary kidney cancer. Also called papillary renal cell carcinoma and PRCC.
    More Information
    - Papillary renal cell carcinoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma)
    Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.
    Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.
  papillary renal cell carcinoma: (PA-pih-LAYR-ee REE-nul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "papillary renal cell carcinoma"
    A type of kidney cancer that forms in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Most papillary tumors look like long, thin finger-like growths under a microscope. There are two types of papillary renal cell carcinoma: type 1 and type 2. Type 1 tends to grow slowly and spread to other parts of the body less often than type 2. Patients with a genetic disorder called hereditary papillary renal cancer have an increased risk of type 1 papillary renal cell carcinoma. Patients with a genetic disorder called hereditary leiomyomatosis and renal cell cancer have an increased risk of type 2 papillary renal cell carcinoma. Also called papillary kidney cancer and PRCC.
    More Information
    - Papillary renal cell carcinoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma)
    Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.
    Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.
  papillary serous carcinoma: (PA-pih-LAYR-ee SEER-us KAR-sih-NOH-muh)
    Pronunciation of dictionary term "papillary serous carcinoma"
    An aggressive cancer that usually affects the uterus/endometrium, peritoneum, or ovary.
  papillary thyroid cancer: (PA-pih-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "papillary thyroid cancer"
    Cancer that forms in follicular cells in the thyroid and grows in small finger-like shapes. It grows slowly, is more common in women than in men, and often occurs before age 45. It is the most common type of thyroid cancer.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
  papillary tumor: (PA-pih-LAYR-ee TOO-mer)
    Pronunciation of dictionary term "papillary tumor"
    A tumor that looks like long, thin “finger-like” growths. These tumors grow from tissue that lines the inside of an organ. Papillary tumors may be benign (not cancer) or malignant (cancer). Papillary tumors occur most often in the bladder, thyroid, and breast, but they may occur in other parts of the body as well.
  papillary-reticular dermal interface: (PA-pih-LAYR-ee-reh-TIH-kyoo-ler DER-mul IN-ter-fays)
    Pronunciation of dictionary term "papillary-reticular dermal interface"
    The layer of the skin between the papillary dermis (the thin top layer of the dermis) and the reticular dermis (the thick bottom layer of the dermis). The dermis is the layer of skin below the epidermis (the outer layer of the skin).
  papilledema: (PA-pil-eh-DEE-muh)
    Pronunciation of dictionary term "papilledema"
    Swelling around the optic disk, the area where the optic nerve (the nerve that carries messages from the eye to the brain) enters the eyeball. Papilledema occurs when increased brain pressure caused by tumors or other problems results in swelling of the optic nerve.
  papule: (PA-pyool)
    Pronunciation of dictionary term "papule"
    A small, solid, raised bump on the skin that has a border with edges that are easy to see. Papules may be red, purple, brown, or pink.
  PAR-101: A substance being studied in the treatment of diarrhea caused by infection with Clostridium difficile (a type of bacteria that can grow without oxygen) in cancer patients. PAR-101 is a type of antibiotic. Also called OPT-80 and tiacumicin B.
  para-aminobenzoic acid: (PAYR-uh-uh-MEE-noh-ben-ZOH-ik A-sid)
    Pronunciation of dictionary term "para-aminobenzoic acid"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Bacteria that live in the intestines need para-aminobenzoic acid to survive. Para-aminobenzoic acid is found in grains and foods from animals. It is being studied as a radiosensitizer (a substance that makes tumor cells more sensitive to radiation therapy) and in the treatment of certain skin disorders. Also called aminobenzoic acid and PABA.
  paracentesis: (PAYR-uh-sen-TEE-sis)
    Pronunciation of dictionary term "paracentesis"
    A procedure in which a thin needle or tube is put into the abdomen to remove fluid from the peritoneal cavity (the space within the abdomen that contains the intestines, the stomach, and the liver).
  paraganglia: (PAYR-uh-GANG-glee-uh)
    Pronunciation of dictionary term "paraganglia"
    A collection of cells that came from embryonic nervous tissue, and are found near the adrenal glands and some blood vessels and nerves. Most paraganglia secrete epinephrine and norepinephrine.
  paraganglioma: (PAYR-uh-GANG-glee-OH-muh)
    Pronunciation of dictionary term "paraganglioma"
    A rare, usually benign tumor that develops from cells of the paraganglia. Paraganglia are a collection of cells that came from embryonic nervous tissue, and are found near the adrenal glands and some blood vessels and nerves. Paragangliomas that develop in the adrenal gland are called pheochromocytomas. Those that develop outside of the adrenal glands near blood vessels or nerves are called glomus tumors or chemodectomas.
    Paraganglioma of the head and neck. A rare tumor that often forms near the carotid artery. It may also form along nerve pathways in the head and neck and in other parts of the body.
    Paraganglioma of the head and neck; drawing shows a tumor near the carotid artery in the head and neck.
  parageusia: (PAYR-uh-GOO-see-uh)
    Pronunciation of dictionary term "parageusia"
    A bad taste in the mouth. Also called dysgeusia.
    More Information
    - Mouth and Throat Problems: Cancer Treatment Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
    - Oral Complications of Cancer Therapies
  paralysis: (puh-RA-lih-sis)
    Pronunciation of dictionary term "paralysis"
    Loss of ability to move all or part of the body.
  paralytic ileus: (PAYR-uh-LIH-tik IH-lee-us)
    Pronunciation of dictionary term "paralytic ileus"
    A condition in which the muscles of the intestines do not allow food to pass through, resulting in a blocked intestine. Paralytic ileus may be caused by surgery, inflammation, and certain drugs.
  parametrium: (payr-uh-MEE-tree-um)
    Pronunciation of dictionary term "parametrium"
    The fat and connective tissue that surrounds the uterus. The parametrium helps connect the uterus to other tissues in the pelvis.
  paramyxovirus: (PAYR-uh-MIK-suh-VY-rus)
    Pronunciation of dictionary term "paramyxovirus"
    A type of virus that has hemagglutinin-neuraminidase proteins in the outer coat and RNA as the genetic material. Measles (rubeola) virus, mumps virus, and Newcastle disease virus are paramyxoviruses.
  paranasal sinus: (PAYR-uh-NAY-zul SY-nus)
    Pronunciation of dictionary term "paranasal sinus"
    One of many small hollow spaces in the bones around the nose. Paranasal sinuses are named after the bones that contain them: frontal (the lower forehead), maxillary (cheekbones), ethmoid (beside the upper nose), and sphenoid (behind the nose). The paranasal sinuses open into the nasal cavity (space inside the nose) and are lined with cells that make mucus to keep the nose from drying out during breathing.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
    Anatomy of the paranasal sinuses (spaces between the bones around the nose).
    Anatomy of the paranasal sinuses; drawing shows front and side views of the frontal sinus, ethmoid sinus, maxillary sinus, and sphenoid sinus. The nasal cavity and pharynx (throat) are also shown.
  paranasal sinus and nasal cavity cancer: (PAYR-uh-NAY-zul SY-nus ... NAY-zul KA-vuh-tee KAN-ser)
    Pronunciation of dictionary term "paranasal sinus and nasal cavity cancer"
    Cancer that forms in tissues of the paranasal sinuses (small hollow spaces in the bones around the nose) or nasal cavity (the inside of the nose). The most common type of paranasal sinus and nasal cavity cancer is squamous cell carcinoma (cancer that begins in flat cells lining these tissues and cavities).
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  paraneoplastic syndrome: (PAYR-uh-NEE-oh-PLAS-tik SIN-drome)
    Pronunciation of dictionary term "paraneoplastic syndrome"
    A group of symptoms that may develop when substances released by some cancer cells disrupt the normal function of surrounding cells and tissue.
  paranoia: (PAYR-uh-noy-uh)
    Pronunciation of dictionary term "paranoia"
    A mental disorder in which a person has an extreme fear and distrust of others. A paranoid person may have delusions that people are trying to harm him or her.
  parapharyngeal space: (PAYR-uh-fuh-RIN-jee-ul …)
    Pronunciation of dictionary term "parapharyngeal space"
    A triangular area near the pharynx (throat), between the base of the skull and the hyoid bone (the bone under the tongue). The parapharyngeal space is in the deep tissues of the neck and contains mostly fat, as well as blood vessels (including the carotid artery and jugular vein), nerves, lymph nodes, and parts of the salivary gland.
  Paraplatin: (PAYR-uh-PLA-tin)
    Pronunciation of dictionary term "Paraplatin"
    A drug that is used to treat advanced ovarian cancer that has never been treated or symptoms of ovarian cancer that has come back after treatment with other anticancer drugs. It is also used with other drugs to treat advanced, metastatic, or recurrent non-small cell lung cancer and is being studied in the treatment of other types of cancer. Paraplatin is a form of the anticancer drug cisplatin and causes fewer side effects in patients. It attaches to DNA in cells and may kill cancer cells. It is a type of platinum compound. Also called carboplatin.
  parasite: (PAYR-uh-SITE)
    Pronunciation of dictionary term "parasite"
    An animal or plant that gets nutrients by living on or in an organism of another species. A complete parasite gets all of its nutrients from the host organism, but a semi-parasite gets only some of its nutrients from the host.
  parasitic: (PAYR-uh-SIH-tik)
    Pronunciation of dictionary term "parasitic"
    Having to do with or being a parasite (an animal or plant that gets nutrients by living on or in an organism of another species).
  parasomnia: (PAYR-uh-SOM-nee-uh)
    Pronunciation of dictionary term "parasomnia"
    An abnormal disruption of sleep, such as sleep walking, sleep talking, nightmares, bedwetting, sleep apnea (problems with breathing that cause loud snoring), or nighttime seizures.
  parasympathetic nervous system: (PAYR-uh-SIM-puh-THEH-tik NER-vus SIS-tem)
    Pronunciation of dictionary term "parasympathetic nervous system"
    The part of the nervous system that slows the heart, dilates blood vessels, decreases pupil size, increases digestive juices, and relaxes muscles in the gastrointestinal tract.
  parathormone: (PAYR-uh-THOR-mone)
    Pronunciation of dictionary term "parathormone"
    A substance made by the parathyroid gland that helps the body store and use calcium. A higher-than-normal amount of parathormone causes high levels of calcium in the blood and may be a sign of disease. Also called parathyrin, parathyroid hormone, and PTH.
  parathyrin: (PAYR-uh-THY-rin)
    Pronunciation of dictionary term "parathyrin"
    A substance made by the parathyroid gland that helps the body store and use calcium. A higher-than-normal amount of parathyrin causes high levels of calcium in the blood and may be a sign of disease. Also called parathormone, parathyroid hormone, and PTH.
  parathyroid cancer: (PAYR-uh-THY-royd KAN-ser)
    Pronunciation of dictionary term "parathyroid cancer"
    A rare cancer that forms in tissues of one or more of the parathyroid glands (four pea-sized glands in the neck that make parathyroid hormone, which helps the body store and use calcium).
    More Information
    - Parathyroid Cancer (https://www.cancer.gov/types/parathyroid)
  parathyroid gland: (PAYR-uh-THY-royd...)
    Pronunciation of dictionary term "parathyroid gland"
    One of four pea-sized glands found on the surface of the thyroid. The parathyroid hormone made by these glands increases the calcium level in the blood.
    More Information
    - Parathyroid Cancer (https://www.cancer.gov/types/parathyroid)
    Anatomy of the thyroid and parathyroid glands. The thyroid gland lies at the base of the throat near the trachea. It is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The parathyroid glands are four pea-sized organs found in the neck near the thyroid. The thyroid and parathyroid glands make hormones.
    Anatomy of the thyroid and parathyroid glands; drawing shows the thyroid gland at the base of the throat near the trachea. An inset shows the front and back views. The front view shows that the thyroid is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The back view shows the four pea-sized parathyroid glands. The larynx is also shown.
  parathyroid hormone: (PAYR-uh-THY-royd HOR-mone)
    Pronunciation of dictionary term "parathyroid hormone"
    A substance made by the parathyroid gland that helps the body store and use calcium. A higher-than-normal amount of parathyroid hormone causes high levels of calcium in the blood and may be a sign of disease. Also called parathormone, parathyrin, and PTH.
  parathyroid hyperplasia: (PAYR-uh-THY-royd HY-per-PLAY-zhuh)
    Pronunciation of dictionary term "parathyroid hyperplasia"
    A condition in which the parathyroid glands (four pea-sized glands found in the neck) are larger than normal. This condition may cause the glands to make too much parathyroid hormone, which can lead to a loss of calcium from the bones, too much calcium in the blood, broken bones, and other health problems. Parathyroid hyperplasia may be caused by chronic kidney disease, low vitamin D levels, and other medical conditions. It may also occur in people who have certain inherited disorders, including multiple endocrine neoplasia (MEN) syndrome and familial isolated hyperparathyroidism.
  parathyroidectomy: (PAYR-uh-THY-roy-DEK-toh-mee)
    Pronunciation of dictionary term "parathyroidectomy"
    Surgery to remove one or more parathyroid glands (four pea-sized organs found on the thyroid).
  parenchyma: (puh-REN-kih-muh)
    Pronunciation of dictionary term "parenchyma"
    The essential or functional elements of an organ.
  parenteral nutrition: (puh-REN-teh-rul noo-TRIH-shun)
    Pronunciation of dictionary term "parenteral nutrition"
    A form of nutritional support that is given directly into the bloodstream through a catheter placed into a vein. Parenteral nutrition bypasses the digestive system and may be given when a person is not able to eat or drink by mouth or has a disease or condition that affects their ability to absorb nutrients through the digestive system. There are two types of parenteral nutrition: partial parenteral nutrition (PPN) and total parenteral nutrition (TPN). PPN is supplemental nutrition that is given when a person cannot get enough calories or the right amount of nutrients that their body needs from the food they are eating. TPN is complete nutrition that provides all the calories, proteins, carbohydrates, fats, vitamins, and minerals that a person needs when they cannot digest food. Also called hyperalimentation.
    More Information
    - Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition)
  paresthesia: (payr-es-THEE-zhuh)
    Pronunciation of dictionary term "paresthesia"
    An abnormal touch sensation, such as burning or prickling, that occurs without an outside stimulus.
  paricalcitol: (PAYR-ih-KAL-sih-tol)
    Pronunciation of dictionary term "paricalcitol"
    A substance that is being used to treat overactive parathyroid glands in patients with kidney failure. It is also being studied in the treatment of cancer. Paricalcitol belongs to the family of drugs called vitamin D analogs.
  parietal cell vagotomy: (puh-RY-uh-tul sel vay-GAH-toh-mee)
    Pronunciation of dictionary term "parietal cell vagotomy"
    Surgery to cut the parts of the vagus nerve that cause gastric acid to be made in the stomach. It is done to treat stomach ulcers or other conditions in which the stomach makes too much acid.
  parietal pericardium: (puh-RY-uh-tul PAYR-ih-KAR-dee-um)
    Pronunciation of dictionary term "parietal pericardium"
    The outer layer of the pericardium, which is a thin sac of tissue that surrounds the heart.
  parietal peritoneum: (puh-RY-uh-tul PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "parietal peritoneum"
    The layers of tissue that line the abdominal wall and the pelvic cavity.
  Parkinson disease: (PAR-kin-sun dih-ZEEZ)
    Pronunciation of dictionary term "Parkinson disease"
    A progressive disorder of the nervous system marked by muscle tremors, muscle rigidity, decreased mobility, stooped posture, slow voluntary movements, and a mask-like facial expression.
  PARN gene: (... jeen)
    Pronunciation of dictionary term "PARN gene"
    A gene that makes a protein involved in controlling gene expression and maintaining telomeres (the ends of chromosomes). Mutations (changes) in the PARN gene have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
  parotid gland cancer: (puh-RAH-tid gland KAN-ser)
    Pronunciation of dictionary term "parotid gland cancer"
    Cancer that forms in a parotid gland, the largest of the salivary glands, which make saliva and release it into the mouth. There are 2 parotid glands, one in front of and just below each ear. Most salivary gland tumors begin in parotid glands.
  parotidectomy: (puh-RAH-tih-DEK-toh-mee)
    Pronunciation of dictionary term "parotidectomy"
    Surgery to remove all or part of the parotid gland (a large salivary gland located in front of and just below the ear). In a radical parotidectomy, the entire gland is removed.
  paroxetine hydrochloride: (puh-ROK-suh-teen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "paroxetine hydrochloride"
    A drug used to treat depression and anxiety disorders. It is a type of selective serotonin reuptake inhibitor (SSRI). Also called Paxil.
  paroxysmal nocturnal hemoglobinuria: (PAYR-ok-SIZ-mul nok-TER-nul HEE-moh-GLOH-bih-NOO-ree-uh)
    Pronunciation of dictionary term "paroxysmal nocturnal hemoglobinuria"
    A rare disorder in which red blood cells are easily destroyed by certain immune system proteins. Symptoms include blood clots, and red or brownish urine in the morning. Aplastic anemia (decreased production of blood cells) may lead to PNH, and people with PNH are at increased risk of acute myelogenous leukemia. Also called PNH.
    More Information
    - Paroxysmal nocturnal hemoglobinuria (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7337/paroxysmal-nocturnal-hemoglobinuria)
    - Paroxysmal nocturnal hemoglobinuria (MedlinePlus) (https://medlineplus.gov/genetics/condition/paroxysmal-nocturnal-hemoglobinuria/)
  PARP: A type of enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. Inhibitors of one enzyme, PARP-1, are being studied in the treatment of cancer. Also called poly (ADP-ribose) polymerase.
  PARP inhibitor: (... in-HIH-bih-ter)
    Pronunciation of dictionary term "PARP inhibitor"
    A substance that blocks an enzyme in cells called PARP. PARP helps repair DNA when it becomes damaged. DNA damage may be caused by many things, including exposure to UV light, radiation, certain anticancer drugs, or other substances in the environment. In cancer treatment, blocking PARP may help keep cancer cells from repairing their damaged DNA, causing them to die. PARP inhibitors are a type of targeted therapy. Also called poly (ADP-ribose) polymerase inhibitor.
  PARP inhibitor AZD2281: (... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "PARP inhibitor AZD2281"
    A drug used alone or with other drugs to treat adults with certain types of prostate cancer, pancreatic cancer, breast cancer, or ovarian, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. PARP inhibitor AZD2281 blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. PARP inhibitor AZD2281 is a type of PARP inhibitor. Also called AZD2281, Lynparza, and olaparib.
    More Information
    - Olaparib (https://www.cancer.gov/about-cancer/treatment/drugs/olaparib)
  PARP-1: An enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. Inhibitors of PARP-1 are being studied in the treatment of cancer. Also called poly (ADP-ribose) polymerase-1.
  PARP-1 inhibitor ABT-888: (… in-HIH-bih-ter …)
    Pronunciation of dictionary term "PARP-1 inhibitor ABT-888"
    A substance being studied in the treatment of breast cancers caused by mutations (changes) in the BRCA1 and BRCA2 genes. It is also being studied in the treatment of other types of cancer. It blocks an enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. PARP-1 inhibitor ABT-888 may cause cancer cells to die. It is a type of poly(ADP-ribose) polymerase inhibitor. Also called ABT-888 and veliparib.
  PARP-1 inhibitor AG014699: (… in-HIH-bih-ter …)
    Pronunciation of dictionary term "PARP-1 inhibitor AG014699"
    A drug used to treat adults with certain types of prostate cancer or ovarian epithelial, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. PARP-1 inhibitor AG014699 blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. PARP-1 inhibitor AG014699 is a type of PARP inhibitor. Also called AG014699, Rubraca, and rucaparib camsylate.
    More Information
    - Rucaparib Camsylate (https://www.cancer.gov/about-cancer/treatment/drugs/rucaparibcamsylate)
  partial cystectomy: (PAR-shul sis-TEK-toh-mee)
    Pronunciation of dictionary term "partial cystectomy"
    Surgery to remove part of the bladder (the organ that holds urine). Also called segmental cystectomy.
  partial hysterectomy: (PAR-shul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "partial hysterectomy"
    Surgery to remove the uterus, but not the cervix. Also called subtotal hysterectomy and supracervical hysterectomy.
  partial laryngectomy: (PAR-shul LAYR-in-JEK-toh-mee)
    Pronunciation of dictionary term "partial laryngectomy"
    An operation to remove part of the larynx (voice box).
  partial mastectomy: (PAR-shul ma-STEK-toh-mee)
    Pronunciation of dictionary term "partial mastectomy"
    Surgery to remove cancer or other abnormal tissue from the breast and some normal tissue around it, but not the breast itself. Some lymph nodes under the arm may be removed for biopsy. Part of the chest wall lining may also be removed if the cancer is near it. Also called breast-conserving surgery, breast-sparing surgery, lumpectomy, quadrantectomy, and segmental mastectomy.
    More Information
    - Breast Cancer Treatment
    Lumpectomy. The tumor and some normal tissue around it are removed, but not the breast itself. Some lymph nodes under the arm may also be removed. If the cancer is near the chest wall, part of the chest wall lining may be removed as well.
    Lumpectomy; the drawing on the left shows removal of the tumor and some of the normal tissue around it. The drawing on the right shows removal of some of the lymph nodes under the arm and removal of the tumor and part of the chest wall lining near the tumor. Also shown is fatty tissue in the breast.
  partial nephrectomy: (PAR-shul neh-FREK-toh-mee)
    Pronunciation of dictionary term "partial nephrectomy"
    Surgery to remove part of one kidney or a kidney tumor, but not an entire kidney.
  partial oophorectomy: (PAR-shul oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "partial oophorectomy"
    Surgery to remove part of one ovary or part of both ovaries.
  partial parenteral nutrition: (PAR-shul puh-REN-teh-rul noo-TRIH-shun)
    Pronunciation of dictionary term "partial parenteral nutrition"
    A form of short-term nutritional support that is given directly into the bloodstream through a catheter placed into a vein. Partial parenteral nutrition bypasses the digestive system and may be given when a person has a disease or condition that affects their ability to absorb nutrients through the digestive system. Partial parenteral nutrition is supplemental nutrition that is given when a person cannot get enough calories or the right amount of nutrients that their body needs from the food they are eating. Also called PPN.
  partial radical vulvectomy: (PAR-shul RA-dih-kul vul-VEK-toh-mee)
    Pronunciation of dictionary term "partial radical vulvectomy"
    Surgery to remove most, but not all, of the vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina). The clitoris may not be removed. Sometimes lymph nodes in the groin area are also removed. Also called modified radical vulvectomy.
  partial remission: (PAR-shul reh-MIH-shun)
    Pronunciation of dictionary term "partial remission"
    A decrease in the size of a tumor, or in the extent of cancer in the body, in response to treatment. Also called partial response.
  partial response: (PAR-shul reh-SPONTS)
    Pronunciation of dictionary term "partial response"
    A decrease in the size of a tumor, or in the extent of cancer in the body, in response to treatment. Also called partial remission.
  partial vulvectomy: (PAR-shul vul-VEK-toh-mee)
    Pronunciation of dictionary term "partial vulvectomy"
    Surgery to remove an affected area of the vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina) along with a small amount of surrounding normal tissue.
  partial-breast irradiation: (PAR-shul-brest ih-RAY-dee-AY-shun)
    Pronunciation of dictionary term "partial-breast irradiation"
    A type of radiation therapy given only to the part of the breast that has cancer in it. Partial-breast irradiation gives a higher dose over a shorter time than is given in standard whole-breast radiation therapy. Partial-breast irradiation may be given using internal or external sources of radiation. Also called accelerated partial-breast irradiation.
  passive antibody therapy: (...AN-tee-BAH-dee THAYR-uh-pee)
    Pronunciation of dictionary term "passive antibody therapy"
    Treatment with injections of antibodies made in another animal or in the laboratory.
  passive immunity: (PA-siv ih-MYOO-nih-tee)
    Pronunciation of dictionary term "passive immunity"
    A type of immunity that occurs when a person is given antibodies rather than making them through his or her own immune system. For example, passive immunity occurs when a baby receives a mother's antibodies through the placenta or breast milk. It can also occur when a person receives an injection of antibodies to protect against the effects of a toxin such as snake venom. Passive immunity provides immediate protection but only lasts a few weeks or months.
  pastoral counselor: (PAS-tuh-rul KOWN-seh-ler)
    Pronunciation of dictionary term "pastoral counselor"
    A person who is trained to give spiritual and mental health advice.
  patchouli: (puh-CHOO-lee)
    Pronunciation of dictionary term "patchouli"
    A bushy herb that is a member of the mint family. A strong-smelling oil taken from the leaves is used in perfumes, incense, detergents, and hair conditioners. It has been used in some cultures to prevent disease. The scientific name is Pogostemon cablin
  paternal: (puh-TER-nul)
    Pronunciation of dictionary term "paternal"
    Having to do with the father, coming from the father, or related through the father.
  Paterson-Kelly syndrome: (PA-ter-sun-KEH-lee SIN-drome)
    Pronunciation of dictionary term "Paterson-Kelly syndrome"
    A disorder marked by anemia caused by iron deficiency, and a web-like growth of membranes in the throat that makes swallowing difficult. Having Paterson-Kelly syndrome may increase the risk of developing esophageal cancer. Also called Plummer-Vinson syndrome and sideropenic dysphagia.
    More Information
    - Plummer Vinson syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8259/paterson-kelly-syndrome)
    - Plummer-Vinson syndrome (MedlinePlus) (https://medlineplus.gov/ency/article/001158.htm)
  pathogenic variant: (PA-thoh-JEH-nik VAYR-ee-unt)
    Pronunciation of dictionary term "pathogenic variant"
    A change in the DNA sequence of a gene that causes a person to have or be at risk of developing a certain genetic disorder or disease, such as cancer. Pathogenic variants can be inherited from a parent or occur during a person’s lifetime. Knowing if a person has a pathogenic variant may help prevent, diagnose, and treat diseases, such as cancer. Not everyone who has a pathogenic variant will develop the disease. Also called deleterious mutation, disease-causing mutation, predisposing mutation, and susceptibility gene mutation.
  pathognomonic: (PA-thog-noh-MAH-nik)
    Pronunciation of dictionary term "pathognomonic"
    Having to do with a sign or symptom that is specific to a certain disease.
  pathologic complete remission: (PA-thuh-LAH-jik kum-PLEET reh-MIH-shun)
    Pronunciation of dictionary term "pathologic complete remission"
    The lack of all signs of cancer in tissue samples removed during surgery or biopsy after treatment with radiation or chemotherapy. To find out if there is a pathologic complete remission, a pathologist checks the tissue samples under a microscope to see if there are still cancer cells left after the anticancer treatment. Knowing if the cancer is in pathologic complete remission may help show how well treatment is working or if the cancer will come back. Also called pathologic complete response.
  pathologic complete response: (PA-thuh-LAH-jik kum-PLEET reh-SPONTS)
    Pronunciation of dictionary term "pathologic complete response"
    The lack of all signs of cancer in tissue samples removed during surgery or biopsy after treatment with radiation or chemotherapy. To find out if there is a pathologic complete response, a pathologist checks the tissue samples under a microscope to see if there are still cancer cells left after the anticancer treatment. Knowing if the cancer is in pathologic complete response may help show how well treatment is working or if the cancer will come back. Also called pathologic complete remission.
  pathologic diagnosis: (PA-thuh-LAH-jik DY-ug-NOH-sis)
    Pronunciation of dictionary term "pathologic diagnosis"
    Identifying a disease or condition by examining cells and tissues under a microscope. In cancer, a pathologic diagnosis usually includes information about the cancer type, grade (how abnormal the cancer cells look under a microscope and how quickly the cancer cells are likely to grow and spread), and stage (the extent of cancer in the body). It may also include information about any special features of the cancer, such as the presence of hormone receptors or other tumor markers.
    More Information
    - Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet)
  pathologic fracture: (PA-thuh-LAH-jik FRAK-sher)
    Pronunciation of dictionary term "pathologic fracture"
    A broken bone caused by disease, often by the spread of cancer to the bone.
  pathological stage: (PA-thuh-LAH-jih-kul stayj)
    Pronunciation of dictionary term "pathological stage"
    The stage of cancer (amount or spread of cancer in the body) that is based on how different from normal the cells in samples of tissue look under a microscope.
  pathological staging: (PA-thuh-LAH-jih-kul STAY-jing)
    Pronunciation of dictionary term "pathological staging"
    A method used to find out the stage of cancer (amount or spread of cancer in the body) by removing tissue samples during surgery or a biopsy. The pathological stage is based on how different from normal the cells in the samples look under a microscope.
  pathologist: (puh-THAH-loh-jist)
    Pronunciation of dictionary term "pathologist"
    A doctor who has special training in identifying diseases by studying cells and tissues under a microscope.
  pathology report: (puh-THAH-loh-jee ...)
    Pronunciation of dictionary term "pathology report"
    The description of cells and tissues made by a pathologist based on microscopic evidence, and sometimes used to make a diagnosis of a disease.
    More Information
    - Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet)
  patient advocate: (PAY-shunt AD-vuh-kut)
    Pronunciation of dictionary term "patient advocate"
    A person who helps guide a patient through the health care system. This includes help going through the screening, diagnosis, treatment, and follow-up of a medical condition, such as cancer. A patient advocate helps patients communicate with their health care providers so they get the information they need to make decisions about their health care. Patient advocates may also help patients set up appointments for doctor visits and medical tests and get financial, legal, and social support. They may also work with insurance companies, employers, case managers, lawyers, and others who may have an effect on a patient’s health care needs. Also called patient navigator.
  patient care costs: (PAY-shunt kayr …)
    Pronunciation of dictionary term "patient care costs"
    The costs related to the treatment of a disease, such as cancer. These costs include doctor visits, hospital stays, laboratory tests, imaging tests, and standard treatments. Patient care costs may also include routine care given to a person participating in a clinical trial. These costs are often covered, at least in part, by health insurance.
  patient navigator: (PAY-shunt NA-vih-GAY-ter)
    Pronunciation of dictionary term "patient navigator"
    A person who helps guide a patient through the health care system. This includes help going through the screening, diagnosis, treatment, and follow-up of a medical condition, such as cancer. A patient navigator helps patients communicate with their health care providers so they get the information they need to make decisions about their health care. Patient navigators may also help patients set up appointments for doctor visits and medical tests and get financial, legal, and social support. They may also work with insurance companies, employers, case managers, lawyers, and others who may have an effect on a patient’s health care needs. Also called patient advocate.
  patient-controlled analgesia: (PAY-shunt-kun-TROLD AN-ul-JEE-zee-uh)
    Pronunciation of dictionary term "patient-controlled analgesia"
    A method of pain relief in which the patient controls the amount of pain medicine that is used. When pain relief is needed, the person can receive a preset dose of pain medicine by pressing a button on a computerized pump that is connected to a small tube in the body. Also called PCA.
  patient-derived xenograft: (PAY-shunt-deh-RIVED ZEE-noh-graft)
    Pronunciation of dictionary term "patient-derived xenograft"
    Tumor tissue that has been taken from a patient and implanted into mice for research purposes. Cancer drugs and other types of treatment may be tested on xenografts to see how well they work before they are given to the patient. Patient-derived xenografts may be used to help plan treatment and learn what the best treatment may be for a patient. They are also being used in the development of new cancer drugs. Also called PDX.
  patient-reported outcome: (PAY-shunt-reh-POR-ted OWT-kum)
    Pronunciation of dictionary term "patient-reported outcome"
    Information about a patient’s health that comes directly from the patient. Examples of patient-reported outcomes include a patient’s description of their symptoms, their satisfaction with care, and how a disease or treatment affects their physical, mental, emotional, spiritual, and social well-being. In clinical trials, patient-reported outcomes may provide information about the side effects of the new treatment being studied. The use of patient-reported outcomes may help plan the best treatment and improve quality of care. Also called PRO.
  Paxil: (PAK-sil)
    Pronunciation of dictionary term "Paxil"
    A drug used to treat depression and anxiety disorders. It is a type of selective serotonin reuptake inhibitor (SSRI). Also called paroxetine hydrochloride.
  pazopanib hydrochloride: (puh-ZOH-puh-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "pazopanib hydrochloride"
    A drug used to treat adults with advanced renal cell carcinoma (a type of kidney cancer) or advanced soft tissue sarcoma that has already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Pazopanib hydrochloride blocks certain proteins, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called GW786034 and Votrient.
    More Information
    - Pazopanib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/pazopanibhydrochloride)
  PBSCT: A procedure in which a patient receives healthy blood-forming cells (stem cells) to replace their own stem cells that have been destroyed by disease or by the radiation or high doses of anticancer drugs that are given as part of the procedure. The healthy stem cells may come from the blood of the patient or a donor. A PBSCT may be autologous (using a patient’s own stem cells that were collected and saved before treatment), allogeneic (using stem cells donated by someone who is not an identical twin), or syngeneic (using stem cells donated by an identical twin). Also called peripheral blood stem cell transplant and peripheral stem cell support.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
    Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.
    Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.
  PC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "PC regimen"
    A chemotherapy combination used to treat endometrial, ovarian, and head and neck cancers, and non-small cell lung cancer that has spread. It includes the drugs carboplatin and paclitaxel (Taxol). Also called Carbo-Tax regimen, carboplatin-Taxol, and carboplatin-Taxol regimen.
  PC-SPES: A mixture of eight herbs that has been sold as a dietary supplement and promoted as a way to keep the prostate healthy and to treat prostate cancer. PC-SPES has been studied in the treatment of prostate cancer, but has been taken off the market in the U.S. because of safety concerns.
    More Information
    - PC-SPES
  PCA: A method of pain relief in which the patient controls the amount of pain medicine that is used. When pain relief is needed, the person can receive a preset dose of pain medicine by pressing a button on a computerized pump that is connected to a small tube in the body. Also called patient-controlled analgesia.
  PCA3 mRNA test: A laboratory test that measures the amount of genetic material called PCA3 mRNA and PSA mRNA in the first urine sample after a digital rectal examination. PCA3 mRNA and PSA mRNA are made by normal prostate cells and prostate cancer cells but are made in higher amounts by prostate cancer cells. The PCA3 score is based on the ratio of PCA3 mRNA to PSA mRNA in the urine. A high PCA3 score may be a sign of prostate cancer. The PCA3 mRNA test may be done in men with a high PSA level whose biopsy of the prostate did not show cancer. The PCA3 mRNA test is used to help decide if another prostate biopsy may be needed. Also called prostate cancer antigen 3 mRNA test.
  PCB: One of a large group of man-made chemical compounds that were used to make many products, including electrical equipment, insulation, fluorescent lights, paints, plastics, rubber, dyes, inks, adhesives, and pesticides. Being exposed to PCBs can cause skin conditions, such as acne and rashes, and eye irritation. Long-term exposure to high levels of PCBs can affect other body systems, and may also cause learning and developmental delays, low birth weight, and cancer. PCBs were banned in the United States in the 1970s, but they may still be found in contaminated soil, air, water, and food. Also called polychlorinated biphenyl.
  PCNSL: Primary CNS lymphoma. Cancer that forms in the lymph tissue of the brain, spinal cord, meninges (outer covering of the brain), or eye (called ocular lymphoma). Also called primary central nervous system lymphoma and primary CNS lymphoma.
    More Information
    - Primary CNS Lymphoma Treatment
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  PCOS: A condition marked by infertility, enlarged ovaries, menstrual problems, high levels of male hormones, excess hair on the face and body, acne, and obesity. Women with PCOS have an increased risk of diabetes, high blood pressure, heart disease, and endometrial cancer. Also called polycystic ovary syndrome.
  PCP: A doctor or other licensed medical professional, such as a nurse practitioner or physician assistant, who manages a person’s health care over time. PCPs diagnose and treat a wide range of common medical conditions. They also provide preventive care, such as disease screenings and immunizations. A PCP may also refer a person to a specialist or coordinate care given by a specialist. Also called primary care provider.
  PCR: A laboratory method used to make many copies of a specific piece of DNA from a sample that contains very tiny amounts of that DNA. PCR allows these pieces of DNA to be amplified so they can be detected. PCR may be used to look for certain changes in a gene or chromosome, which may help find and diagnose a genetic condition or a disease, such as cancer. It may also be used to look at pieces of the DNA of certain bacteria, viruses, or other microorganisms to help diagnose an infection. Also called polymerase chain reaction.
    More Information
    - Polymerase Chain Reaction (PCR) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Polymerase-Chain-Reaction)
  PCT: A rare disorder that affects the skin and causes painful blisters on parts of the body that are exposed to the sun, usually the hands, arms, and face. The affected skin may be fragile, and it may blister or peel after a minor injury. Other signs and symptoms of PCT include changes in skin color, increased hair growth (especially on the face), and redness, swelling, itching, scarring, and thickening of the affected skin. Liver problems may occur, and patients with PCT may have an increased risk of liver cancer. In PCT, the body does not make enough of an enzyme called uroporphyrinogen decarboxylase. PCT may be inherited, or it may be caused by too much iron in the body, certain infections (such as hepatitis C or HIV infection), smoking, drinking too much alcohol, taking the hormone estrogen, and certain genetic disorders. PCT is usually diagnosed after the age of 30 years. Also called porphyria cutanea tarda.
    More Information
    - Porphyria cutanea tarda (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7433/porphyria-cutanea-tarda)
    - Porphyria (MedlinePlus) (https://medlineplus.gov/genetics/condition/porphyria/)
  PCV: An abbreviation for a chemotherapy combination used to treat certain types of brain tumors. It is often used with radiation therapy. It includes the drugs procarbazine hydrochloride, lomustine (CCNU), and vincristine sulfate. Also called PCV regimen.
    More Information
    - PCV (https://www.cancer.gov/about-cancer/treatment/drugs/PCV)
  PCV regimen: (… REH-jih-men)
    Pronunciation of dictionary term "PCV regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of brain tumors. It is often used with radiation therapy. It includes the drugs procarbazine hydrochloride, lomustine (CCNU), and vincristine sulfate. Also called PCV.
    More Information
    - PCV (https://www.cancer.gov/about-cancer/treatment/drugs/PCV)
  PD-1: A protein found on T cells (a type of immune cell) that helps keep the body’s immune responses in check. When PD-1 is bound to another protein called PD-L1, it helps keep T cells from killing other cells, including cancer cells. Some anticancer drugs, called immune checkpoint inhibitors, are used to block PD-1. When this protein is blocked, the “brakes” on the immune system are released and the ability of T cells to kill cancer cells is increased.
  PD-L1: A protein that acts as a kind of “brake” to keep the body’s immune responses under control. PD-L1 may be found on some normal cells and in higher-than-normal amounts on some types of cancer cells. When PD-L1 binds to another protein called PD-1 (a protein found on T cells), it keeps T cells from killing the PD-L1-containing cells, including the cancer cells. Anticancer drugs called immune checkpoint inhibitors bind to PD-L1 and block its binding to PD-1. This releases the “brakes” on the immune system and leaves T cells free to kill cancer cells.
  PDAC: The most common type of pancreatic cancer. PDAC forms in exocrine cells of the pancreas. Exocrine pancreas cells make up the glands and ducts that produce enzymes (digestive juices) to help with digestion. PDAC occurs when exocrine cells grow out of control and form a tumor. Factors that may increase a person’s risk of developing PDAC include having a family history of the disease, chronic pancreatitis (inflammation of the pancreas), certain genetic syndromes, type 2 diabetes, excess body weight or obesity, exposure to certain chemicals, and smoking. It is usually found at an advanced stage because it usually does not cause symptoms early on. Also called pancreatic ductal adenocarcinoma.
  PDGF: A family of molecules released from platelets (tiny pieces of cells that are found in the blood and that help the blood clot). Forms of PDGF help to heal wounds and to repair damage to blood vessel walls. They also help blood vessels grow. Also called platelet-derived growth factor.
  PDGFRA gene: (… jeen)
    Pronunciation of dictionary term "PDGFRA gene"
    A gene that makes a protein that is involved in cell division and cell survival. Mutated (changed) forms of the PDGFRA gene and protein have been found in some types of cancer, including gastrointestinal stromal tumors and chronic eosinophilic leukemia. These changes may increase the growth of cancer cells. Checking for changes in the PDGFRA gene in tumor tissue may help diagnose some types of cancer and plan treatment. Also called platelet-derived growth factor receptor alpha gene.
  PDQ: PDQ is an online source of cancer information that is developed and maintained by the National Cancer Institute (NCI). It makes current, credible, and accurate cancer information available to health professionals and the public. PDQ contains information about cancer treatment, supportive and palliative care, screening, prevention, genetics, and integrative, complementary, and alternative medicine. This information is updated with the most recent evidence from scientific research. PDQ also contains drug information summaries on many cancer-related drugs and dictionaries of cancer terms, drug terms, and genetics terms. Most of this information and more specific information about PDQ can be found on the NCI's website at http://www.cancer.gov/publications/pdq. Also called Physician Data Query.
    More Information
    - PDQ® - NCI's Comprehensive Database (https://www.cancer.gov/publications/pdq)
  PDX: Tumor tissue that has been taken from a patient and implanted into mice for research purposes. Cancer drugs and other types of treatment may be tested on xenografts to see how well they work before they are given to the patient. PDXs may be used to help plan treatment and learn what the best treatment may be for a patient. They are also being used in the development of new cancer drugs. Also called patient-derived xenograft.
  peak exposure: (peek ek-SPOH-zher)
    Pronunciation of dictionary term "peak exposure"
    The largest amount of a substance or radiation that a person is exposed to at one time. Peak exposure to a harmful substance or radiation may increase the risk of certain diseases or conditions.
  peau d'orange: (poh duh-RANJ)
    Pronunciation of dictionary term "peau d'orange"
    A dimpled condition of the skin of the breast, resembling the skin of an orange, sometimes found in inflammatory breast cancer.
    More Information
    - Inflammatory Breast Cancer (https://www.cancer.gov/types/breast/ibc-fact-sheet)
    Inflammatory breast cancer is a type of breast cancer in which the cancer cells block the lymph vessels in the skin of the breast. This causes the breast to look red and swollen. The skin may also appear dimpled or pitted, like the skin of an orange (peau d'orange), and the nipple may be inverted (facing inward).
    Inflammatory breast cancer of the left breast showing redness, swelling, peau d'orange, and an inverted nipple.
  PEB: An abbreviation for a chemotherapy combination used in children to treat certain types of malignant (cancer) germ cell tumors that are not in the brain. It includes the drugs cisplatin (Platinol), etoposide phosphate, and bleomycin sulfate. Also called PEB regimen.
    More Information
    - PEB (https://www.cancer.gov/about-cancer/treatment/drugs/PEB)
  PEB regimen: (… REH-jih-men)
    Pronunciation of dictionary term "PEB regimen"
    An abbreviation for a chemotherapy combination used in children to treat certain types of malignant (cancer) germ cell tumors that are not in the brain. It includes the drugs cisplatin (Platinol), etoposide phosphate, and bleomycin sulfate. Also called PEB.
    More Information
    - PEB (https://www.cancer.gov/about-cancer/treatment/drugs/PEB)
  PEComa: A family of rare tumors that form in the soft tissues of the stomach, intestines, lungs, female reproductive organs, and genitourinary organs. Most PEComas are benign (not cancer). They often occur in children with an inherited condition called tuberous sclerosis. Also called perivascular epithelioid cell tumor.
  PediaSure: (PEE-dee-uh-sher)
    Pronunciation of dictionary term "PediaSure"
    A nutritional drink that helps children who cannot get everything they need in their diet from foods and other drinks. It may be given through a small tube that is inserted through the nose into the stomach or the small intestine. It may also be given through a tube that is put into the stomach or the intestinal tract through an opening made on the outside of the abdomen. Also called pediatric polymeric enteral nutrition formula.
  pediatric: (pee-dee-A-trik)
    Pronunciation of dictionary term "pediatric"
    Having to do with children.
    More Information
    - Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
  pediatric cancer: (pee-dee-A-trik KAN-ser)
    Pronunciation of dictionary term "pediatric cancer"
    A term used to describe cancers that occur between birth and 14 years of age. Pediatric cancers are very rare and may differ from adult cancers in the way they grow and spread, how they are treated, and how they respond to treatment. The most common types of pediatric cancer are leukemia, brain and spinal cord tumors, lymphoma, neuroblastoma, Wilms tumor (a type of kidney cancer), retinoblastoma, and cancers of the bone and soft tissue. Also called childhood cancer.
    More Information
    - Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
    - PDQ® Cancer Information Summaries: Pediatric Treatment (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment)
  pediatric gastroenterologist: (pee-dee-A-trik GAS-troh-EN-teh-RAH-loh-jist)
    Pronunciation of dictionary term "pediatric gastroenterologist"
    A doctor who has special training in diagnosing and treating disorders of the gastrointestinal (digestive) system in children. These disorders include problems in the stomach, intestines, liver, gallbladder, pancreas, rectum, and anus. Pediatric gastroenterologists also treat children with feeding, swallowing, and nutritional problems, such as malnutrition, failure to thrive, and obesity.
  pediatric hematologist: (PEE-dee-A-trik HEE-muh-TAH-loh-jist)
    Pronunciation of dictionary term "pediatric hematologist"
    A doctor who has special training in diagnosing and treating blood disorders in children.
  pediatric intensivist: (pee-dee-A-trik in-TEN-sih-vist)
    Pronunciation of dictionary term "pediatric intensivist"
    A doctor who has special training in diagnosing and treating children who are seriously ill or injured. Pediatric intensivists use special procedures, treatments, and medicines to care for children who are usually in a pediatric intensive care unit of a hospital. Pediatric intensivists coordinate the overall care of these children, including treatment given by other specialists.
  pediatric nurse specialist: (pee-dee-A-trik ... SPEH-shuh-list)
    Pronunciation of dictionary term "pediatric nurse specialist"
    A registered nurse with an advanced degree in nursing who specializes in the care of children.
  pediatric oncologist: (pee-dee-A-trik on-KAH-loh-jist)
    Pronunciation of dictionary term "pediatric oncologist"
    A doctor who has special training in diagnosing and treating children with cancer.
    More Information
    - PDQ® Cancer Information Summaries: Pediatric Treatment (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment)
  pediatric polymeric enteral nutrition formula: (pee-dee-A-trik PAH-lih-MAYR-ik EN-teh-rul noo-TRIH-shun FOR-myoo-luh)
    Pronunciation of dictionary term "pediatric polymeric enteral nutrition formula"
    A nutritional drink that helps children who cannot get everything they need in their diet from foods and other drinks. It may be given through a small tube that is inserted through the nose into the stomach or the small intestine. It may also be given through a tube that is put into the stomach or the intestinal tract through an opening made on the outside of the abdomen. Also called PediaSure.
  pediatric surgeon: (pee-dee-A-trik SER-jun)
    Pronunciation of dictionary term "pediatric surgeon"
    A surgeon who has special training in treating children. A surgeon removes or repairs a part of the body by operating on the patient.
  pediatrician: (PEE-dee-uh-TRIH-shun)
    Pronunciation of dictionary term "pediatrician"
    A doctor who has special training in preventing, diagnosing, and treating diseases and injuries in children. Pediatricians also help manage other problems that affect children, such as developmental disorders and behavioral, emotional, and social problems.
  pedicle flap: (PEH-dih-kul …)
    Pronunciation of dictionary term "pedicle flap"
    A type of surgery used to rebuild the shape of the breast after a mastectomy. Tissue, including skin, fat, and muscle, is moved from one area of the body, such as the back or abdomen, to the chest to form a new breast mound. The tissue flap, along with its blood vessels, stays connected to the body and is passed through a tunnel under the skin to the chest. A pedicle flap is a type of breast reconstruction.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  pedigree: (PEH-dih-gree)
    Pronunciation of dictionary term "pedigree"
    A diagram that shows relationships among family members. In medicine, a pedigree may also show the pattern of certain genes or diseases within a family.
    Lynch syndrome pedigree. This pedigree shows some of the classic features of a family with Lynch syndrome, including affected family members with colon cancer or endometrial cancer and a younger age at onset in some individuals. Lynch syndrome families may exhibit some or all of these features. Lynch syndrome families may also include individuals with other gastrointestinal, gynecologic, and genitourinary cancers, or other extracolonic cancers. As an autosomal dominant syndrome, Lynch syndrome can be transmitted through maternal or paternal lineages, as depicted in the figure.
    Pedigree showing some of the classic features of a family with Lynch syndrome across three generations, including transmission occurring through maternal and paternal lineages and the presence of both colon and endometrial cancers.
  Pedmark: (PED-mark)
    Pronunciation of dictionary term "Pedmark"
    A drug used to reduce the risk of hearing loss in children aged 1 month and older who are receiving cisplatin (a type of anticancer drug) for solid tumors that have not spread to other parts of the body. It is also being studied in the prevention and treatment of other conditions. Pedmark is a type of chemoprotective agent. Also called sodium thiosulfate anhydrous.
  pedunculated: (peh-DUN-kyoo-LAY-ted)
    Pronunciation of dictionary term "pedunculated"
    In the body, a structure that has a peduncle (a stalk or stem) or is attached to another structure by a peduncle.
  peer review process: (peer ree-VYOO PRAH-ses)
    Pronunciation of dictionary term "peer review process"
    The process by which original articles and grants written by researchers are evaluated for technical and scientific quality and correctness by other experts in the same field.
  peer-reviewed scientific journal: (peer-ree-VYOOD SY-en-TIH-fik JER-nul)
    Pronunciation of dictionary term "peer-reviewed scientific journal"
    A publication that contains original articles that have been written by scientists and evaluated for technical and scientific quality and correctness by other experts in the same field.
  PEG: A polymer made by joining molecules of ethylene oxide and water together in a repeating pattern. PEG can be a liquid or a waxy solid. In medicine, forms of PEG can be used in ointments, in drugs or substances to make them stay in the body longer, or in laxatives. Also called polyethylene glycol.
  PEG tube: (…toob)
    Pronunciation of dictionary term "PEG tube"
    A tube inserted through the wall of the abdomen directly into the stomach. It allows air and fluid to leave the stomach and can be used to give drugs and liquids, including liquid food, to the patient. Giving food through a PEG tube is a type of enteral nutrition. Also called gastrostomy tube and percutaneous endoscopic tube.
  PEG-asparaginase: (... as-PAYR-uh-jih-NAYS)
    Pronunciation of dictionary term "PEG-asparaginase"
    A drug used with other drugs to treat adults and children with acute lymphoblastic leukemia. It is used in patients whose cancer has not already been treated or who cannot be treated with asparaginase. It is also being studied in the treatment of other types of cancer. PEG-asparaginase is made up of the enzyme L-asparaginase that is linked to a substance called PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. PEG-asparaginase is a type of protein synthesis inhibitor. Also called Oncaspar and pegaspargase.
    More Information
    - Pegaspargase (https://www.cancer.gov/about-cancer/treatment/drugs/pegaspargase)
  PEG-Intron: (… IN-tron)
    Pronunciation of dictionary term "PEG-Intron"
    A drug that is no longer available in the United States that contains the active ingredient peginterferon alfa-2b and was used to treat chronic hepatitis C. PEG-Intron is a type of cytokine and a type of immunomodulating agent.
  PEG-MGDF: A form of megakaryocyte growth and development factor (MGDF) that is made in the laboratory. MGDF comes from the protein thrombopoietin, which is normally made in the body to help make platelets. PEG-MGDF is being studied as a way to increase the number of platelets in patients receiving chemotherapy. Also called PEG-rhMGDF and polyethylene glycosylated recombinant human megakaryocyte growth and development factor.
  PEG-rhMGDF: A form of megakaryocyte growth and development factor (MGDF) that is made in the laboratory. MGDF comes from the protein thrombopoietin, which is normally made in the body to help make platelets. PEG-rhMGDF is being studied as a way to increase the number of platelets in patients receiving chemotherapy. Also called PEG-MGDF and polyethylene glycosylated recombinant human megakaryocyte growth and development factor.
  pegaspargase: (peg-A-spar-jays)
    Pronunciation of dictionary term "pegaspargase"
    A drug used with other drugs to treat adults and children with acute lymphoblastic leukemia. It is used in patients whose cancer has not already been treated or who cannot be treated with asparaginase. It is also being studied in the treatment of other types of cancer. Pegaspargase is made up of the enzyme L-asparaginase that is linked to a substance called PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. Pegaspargase is a type of protein synthesis inhibitor. Also called Oncaspar and PEG-asparaginase.
    More Information
    - Pegaspargase (https://www.cancer.gov/about-cancer/treatment/drugs/pegaspargase)
  Pegasys: (PEH-guh-sis)
    Pronunciation of dictionary term "Pegasys"
    A drug used to treat hepatitis C infections. It is also being studied in the treatment and prevention of cancer. It is a cytokine that is modified in the laboratory. It is a type of biological response modifier. Also called peginterferon alfa-2a.
  pegfilgrastim: (peg-fil-GRAS-tim)
    Pronunciation of dictionary term "pegfilgrastim"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Pegfilgrastim helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called filgrastim-SD/01, Fulphila, Neulasta, Nyvepria, Udenyca, and Ziextenzo.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  peginterferon alfa-2a: (peg-IN-ter-FEER-on AL-fuh ...)
    Pronunciation of dictionary term "PEG-interferon alfa-2a"
    A drug used to treat hepatitis C infections. It is also being studied in the treatment and prevention of cancer. It is a cytokine that is modified in the laboratory. It is a type of biological response modifier. Also called Pegasys.
  peginterferon alfa-2b: (peg-IN-ter-FEER-on AL-fuh ...)
    Pronunciation of dictionary term "peginterferon alfa-2b"
    A drug that is no longer available in the United States that was used under the brand name Sylatron to prevent melanoma from coming back after it has been removed by surgery and under the brand name PEG-Intron to treat chronic hepatitis C. Peginterferon alfa-2b is a form of interferon alfa (a substance normally made by cells in the immune system) that is made in the laboratory and linked to a substance called PEG, which makes the drug stay in the body longer. It is a type of cytokine and a type of immunomodulating agent.
  pegylated arginine deiminase: (PEH-guh-LAY-ted AR-jih-neen DEE-IH-mih-nays)
    Pronunciation of dictionary term "pegylated arginine deiminase"
    A substance being studied in the treatment of melanoma, liver cancer, and other types of cancer. It breaks down the amino acid arginine and may block the growth of cancer cells that need arginine to grow. It is a type of iminohydrolase. Also called ADI-PEG 20.
  PEI: An injection of ethanol (alcohol) through the skin directly into a tumor to kill cancer cells. Ultrasound or a CT scan is used to guide the needle into the tumor. Also called alcohol ablation, ethanol ablation, and percutaneous ethanol injection.
  PEITC: A substance being studied in the prevention of cancer. It is a naturally occurring compound found in some cruciferous vegetables. Also called phenethyl isothiocyanate.
  pelargonium: (PEH-lar-GOH-nee-um)
    Pronunciation of dictionary term "pelargonium"
    A type of plant that is native to southern Africa and has white, pink, purple, or red flowers and 3- to 5-lobed leaves. An essential oil that smells like roses is taken from the leaves and used in perfume, in mosquito repellants, and in aromatherapy to treat skin problems and to reduce stress. The scientific name is Pelargonium graveolens. Also called geranium.
  peldesine: (PEL-deh-seen)
    Pronunciation of dictionary term "peldesine"
    A substance that is being studied for the treatment of cancer.
  pelitinib: (peh-LIH-tih-nib)
    Pronunciation of dictionary term "pelitinib"
    A substance being studied in the treatment of some types of cancer. It blocks the action of certain proteins that are part of the epidermal growth factor receptor (EGFR) family of proteins. These proteins may be found in increased amounts on the surface of some types of cancer cells. Blocking the action of these proteins may stop cancer cells from growing and may kill cancer cells. Pelitinib is a type of EGFR inhibitor. Also called EKB-569.
  pelvic: (PEL-vik)
    Pronunciation of dictionary term "pelvic"
    Having to do with the pelvis. The pelvis is the area of the body below the abdomen that is located between the hip bones and contains the bladder and rectum. In females, it also contains the vagina, cervix, uterus, fallopian tubes, and ovaries. In males, it also contains the prostate and seminal vesicles.
  pelvic exam: (PEL-vik eg-ZAM)
    Pronunciation of dictionary term "pelvic exam"
    A physical exam of the vulva, vagina, cervix, uterus, fallopian tubes, ovaries, and rectum. First, the vulva is checked for redness, swelling, sores, or other abnormalities. A speculum is then inserted into the vagina to widen it so the vagina and cervix can be checked for signs of disease. Cell samples may be taken for a Pap test or HPV test to screen for cervical cancer. The health care provider then inserts one or two lubricated, gloved fingers of one hand into the vagina and presses on the lower abdomen with the other hand to feel for lumps and check the size, shape, and position of the uterus and ovaries. The rectum may also be checked for lumps or abnormal areas. Also called internal exam.
    More Information
    - Cervical Cancer Screening
    Pelvic exam. A doctor or nurse inserts one or two lubricated, gloved fingers of one hand into the vagina and presses on the lower abdomen with the other hand. This is done to feel the size, shape, and position of the uterus and ovaries. The vagina, cervix, fallopian tubes, and rectum are also checked.
    Pelvic exam; drawing shows a side view of the female reproductive anatomy during a pelvic exam. The uterus, left fallopian tube, left ovary, cervix, vagina, bladder, and rectum are shown. Two gloved fingers of one hand of the doctor or nurse are shown inserted into the vagina, while the other hand is shown pressing on the lower abdomen. The inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
    Pap test. A speculum is inserted into the vagina to widen it. Then, a brush is inserted into the vagina to collect cells from the cervix. The cells are checked under a microscope for signs of disease.
    Pap test; drawing shows a side view of the female reproductive anatomy during a Pap test. A speculum is shown widening the opening of the vagina. A brush is shown inserted into the open vagina and touching the cervix at the base of the uterus. The rectum is also shown. One inset shows the brush touching the center of the cervix. A second inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.
  pelvic exenteration: (PEL-vik eg-ZEN-teh-RAY-shun)
    Pronunciation of dictionary term "pelvic exenteration"
    Surgery to remove the lower colon, rectum, and bladder, and create stomata (openings) through which urine and stool are passed out of the body. In women, the cervix, vagina, ovaries, and nearby lymph nodes are also removed.
  pelvic inflammatory disease: (PEL-vik in-FLA-muh-TOR-ee dih-ZEEZ)
    Pronunciation of dictionary term "pelvic inflammatory disease"
    A condition in which the female reproductive organs are inflamed. It may affect the uterus, fallopian tubes, ovaries, and certain ligaments. Pelvic inflammatory disease is usually caused by a bacterial infection. It may cause infertility and an increased risk of an ectopic pregnancy (pregnancy in the fallopian tubes). Also called PID.
  pelvic lymph node: (PEL-vik limf node)
    Pronunciation of dictionary term "pelvic lymph node"
    A lymph node in the pelvis. The pelvis is the area of the body below the abdomen that contains the hip bones, bladder, rectum, and male or female reproductive organs. Pelvic lymph nodes drain and filter lymph from the pelvis and nearby areas. In cancer, pelvic lymph nodes that are near a tumor may be removed by surgery to check for signs that cancer has spread.
  pelvic lymphadenectomy: (PEL-vik LIM-fa-deh-NEK-toh-mee)
    Pronunciation of dictionary term "pelvic lymphadenectomy"
    Surgery to remove lymph nodes in the pelvis for examination under a microscope to see if they contain cancer.
  pelvic wall: (PEL-vik ...)
    Pronunciation of dictionary term "pelvic wall"
    The muscles and ligaments that line the part of the body between the hips.
  pelvis: (PEL-vus)
    Pronunciation of dictionary term "pelvis"
    The bones between the lower abdomen and upper thighs that connect the spine to the legs. The pelvis supports upper body weight, aids balance and walking, and protects the bladder, reproductive organs, colon, and rectum. The pelvis can also describe the pelvic region, or the area of the body below the abdomen that contains the hip bones, bladder, and rectum. In females, it also contains the vagina, cervix, uterus, fallopian tubes, and ovaries. In males, it also contains the prostate and seminal vesicles.
    The pelvis is the area of the body below the abdomen that contains the hip bones, bladder, and rectum. In females, it also contains the vagina, cervix, uterus, fallopian tubes, and ovaries. In males, it also contains the prostate and seminal vesicles.
    Two-panel drawing showing the anatomy of the male pelvis (left panel) and female pelvis (right panel). Both panels show the pelvis, rectum, hip joint, and bladder. Also shown are the seminal vesicles and prostate (left panel), and the vagina, cervix, uterus, ovaries, and fallopian tubes (right panel).
  Pemazyre: (PEH-muh-zeer)
    Pronunciation of dictionary term "Pemazyre"
    A drug used to treat adults with certain types of cholangiocarcinoma (bile duct cancer), myeloid cancer, or lymphoid cancer that have certain changes in the structure of the FGFR1 gene or FGFR2 gene. It is also being studied in the treatment of other types of cancer. Pemazyre blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called pemigatinib.
    More Information
    - Pemigatinib (https://www.cancer.gov/about-cancer/treatment/drugs/pemigatinib)
  pembrolizumab: (pem-broh-LIH-zoo-mab)
    Pronunciation of dictionary term "pembrolizumab"
    A drug that binds to the protein PD-1 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that express the protein PD-L1, that have certain mutations (changes) in genes involved in DNA repair, or that have a high number of tumor mutations. Pembrolizumab is used alone or with other drugs to treat certain types of biliary tract cancer (including bile duct cancer and gallbladder cancer), breast cancer, cervical cancer, classic Hodgkin lymphoma, colorectal cancer, endometrial cancer, esophageal cancer, gastroesophageal junction cancer, head and neck squamous cell carcinoma (SCC), hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, non-small cell lung cancer, primary mediastinal large B-cell lymphoma, renal cell carcinoma (a type of kidney cancer), skin cancer (SCC of the skin, Merkel cell carcinoma, and melanoma), stomach cancer, urothelial carcinoma (a type of bladder or urinary tract cancer), and other solid tumors. It is also being studied in the treatment of other types of cancer. Pembrolizumab may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Keytruda.
    More Information
    - Pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)
  pemetrexed disodium: (peh-meh-TREK-sed dy-SOH-dee-um)
    Pronunciation of dictionary term "pemetrexed disodium"
    A drug used alone or with other drugs to treat certain types of non-small cell lung cancer and malignant pleural mesothelioma. It is also being studied in the treatment of other types of cancer. Pemetrexed disodium stops cells from using folic acid to make DNA and may kill cancer cells. It is a type of antimetabolite and a type of antifolate. Also called Alimta, LY231514, and Pemfexy.
    More Information
    - Pemetrexed Disodium (https://www.cancer.gov/about-cancer/treatment/drugs/pemetrexeddisodium)
  Pemfexy: (pem-FEK-see)
    Pronunciation of dictionary term "Pemfexy"
    A drug used alone or with other drugs to treat certain types of non-small cell lung cancer and malignant pleural mesothelioma. It is also being studied in the treatment of other types of cancer. Pemfexy stops cells from using folic acid to make DNA and may kill cancer cells. It is a type of antimetabolite and a type of antifolate. Also called Alimta, LY231514, and pemetrexed disodium.
    More Information
    - Pemetrexed Disodium (https://www.cancer.gov/about-cancer/treatment/drugs/pemetrexeddisodium)
  pemigatinib: (PEH-mih-GA-tih-nib)
    Pronunciation of dictionary term "pemigatinib"
    A drug used to treat adults with certain types of cholangiocarcinoma (bile duct cancer), myeloid cancer, or lymphoid cancer that have certain changes in the structure of the FGFR1 gene or FGFR2 gene. It is also being studied in the treatment of other types of cancer. Pemigatinib blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Pemazyre.
    More Information
    - Pemigatinib (https://www.cancer.gov/about-cancer/treatment/drugs/pemigatinib)
  penclomedine: (pen-KLOH-meh-deen)
    Pronunciation of dictionary term "penclomedine"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called alkylating agents.
  penectomy: (pee-NEK-toh-mee)
    Pronunciation of dictionary term "penectomy"
    Surgery to remove part or all of the penis (an external male reproductive organ).
  penetrance: (PEH-neh-trunts)
    Pronunciation of dictionary term "penetrance"
    Describes how likely it is that a person who has a certain disease-causing mutation (change) in a gene will show signs and symptoms of the disease. Not everyone who has the mutation will develop the disease. For example, some people who have a BRCA1 or BRCA2 gene mutation will develop cancer during their lifetime, but others will not. Currently, there is no way to know which people who have a cancer-causing mutation will develop cancer. Complete penetrance means that every person who has the mutation will show signs and symptoms of the disease.
  penicillamine: (PEH-nih-SIH-luh-MEEN)
    Pronunciation of dictionary term "penicillamine"
    A drug that removes copper from the body and is used to treat diseases in which there is an excess of copper. It is also being studied as a possible angiogenesis inhibitor in the treatment of brain tumors.
  penicillin: (PEH-nih-SIH-lin)
    Pronunciation of dictionary term "penicillin"
    A drug that is used to treat infection. It belongs to the family of drugs called antibiotics.
  penile cancer: (PEE-nile KAN-ser)
    Pronunciation of dictionary term "penile cancer"
    A rare cancer that forms in the penis (an external male reproductive organ). Most penile cancers are squamous cell carcinomas (cancer that begins in flat cells lining the penis).
    More Information
    - Penile Cancer (https://www.cancer.gov/types/penile)
    Anatomy of the penis. The parts of the penis are the base, shaft, glans, and foreskin. The tissues that make up the penis include the dorsal nerve, blood vessels, connective tissue, and erectile tissue (corpus cavernosum and corpus spongiosum). The urethra passes from the bladder to the tip of the penis.
    Anatomy of the penis; drawing shows the base, shaft, glans, foreskin, and urethral opening. Also shown are the scrotum, prostate, pubic bone, and lymph nodes. An inset shows a cross section of the inside of the penis, including the blood vessels, dorsal nerve, connective tissue, erectile tissue (corpus cavernosum and corpus spongiosum), and urethra.
  penile implant: (PEE-nile IM-plant)
    Pronunciation of dictionary term "penile implant"
    A firm rod or inflatable device that is placed in the penis (an external male reproductive organ) during a surgical procedure. The implant makes it possible to have and keep an erection. Penile implants are used to treat erectile dysfunction or impotence.
  penis: (PEE-nis)
    Pronunciation of dictionary term "penis"
    An external male reproductive organ. It contains a tube called the urethra, which carries semen and urine to the outside of the body.
    More Information
    - Penile Cancer (https://www.cancer.gov/types/penile)
    Anatomy of the penis. The parts of the penis are the base, shaft, glans, and foreskin. The tissues that make up the penis include the dorsal nerve, blood vessels, connective tissue, and erectile tissue (corpus cavernosum and corpus spongiosum). The urethra passes from the bladder to the tip of the penis.
    Anatomy of the penis; drawing shows the base, shaft, glans, foreskin, and urethral opening. Also shown are the scrotum, prostate, pubic bone, and lymph nodes. An inset shows a cross section of the inside of the penis, including the blood vessels, dorsal nerve, connective tissue, erectile tissue (corpus cavernosum and corpus spongiosum), and urethra.
  penpulimab: (pen-PUH-lih-mab)
    A drug used alone or with other drugs to treat certain types of nasopharyngeal cancer (a type of head and neck cancer). It is used in adults whose cancer cells do not form masses of cells that contain keratin. It is also being studied in the treatment of other types of cancer. Penpulimab binds to a protein called PD-1, which is found on T cells (a type of immune cell). Penpulimab may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor.
  Pentam: (PEN-tam)
    Pronunciation of dictionary term "Pentam"
    A drug used to treat infections caused by certain microorganisms. It is also being studied in the treatment of melanoma. It prevents DNA from being copied and may kill cancer cells. It is a type of antifungal agent, a type of antiprotozoal agent, and a type of PRL phosphatase inhibitor. Also called pentamidine isethionate.
  pentamidine: (pen-TA-mih-deen)
    Pronunciation of dictionary term "pentamidine"
    The active ingredient in a drug used to treat infections caused by certain microorganisms. It is also being studied in the treatment of melanoma. It prevents DNA from being copied and may kill cancer cells. It is a type of antifungal agent, a type of antiprotozoal agent, and a type of PRL phosphatase inhibitor.
  pentamidine isethionate: (pen-TA-mih-deen I-seh-THY-oh-nayt)
    Pronunciation of dictionary term "pentamidine isethionate"
    A drug used to treat infections caused by certain microorganisms. It is also being studied in the treatment of melanoma. It prevents DNA from being copied and may kill cancer cells. It is a type of antifungal agent, a type of antiprotozoal agent, and a type of PRL phosphatase inhibitor. Also called Pentam.
  pentetic acid calcium: (pen-TEH-tik A-sid KAL-see-um)
    Pronunciation of dictionary term "pentetic acid calcium"
    A drug that protects healthy tissues from the toxic effects of anticancer drugs.
  pentosan polysulfate: (PEN-tuh-SAN PAH-lee-SUL-fayt)
    Pronunciation of dictionary term "pentosan polysulfate"
    A drug used to relieve pain or discomfort associated with chronic inflammation of the bladder. It is also being evaluated for its protective effects on the gastrointestinal tract in people undergoing radiation therapy.
  pentostatin: (PEN-toh-STA-tin)
    Pronunciation of dictionary term "pentostatin"
    The active ingredient in a drug that is used to treat hairy cell leukemia and is being studied in the treatment of other types of cancer. Pentostatin blocks a protein needed for cell growth and may kill cancer cells. It is made by a bacterium. It is a type of adenosine deaminase inhibitor. Also called Nipent.
  pentoxifylline: (PEN-tok-SIH-fuh-lin)
    Pronunciation of dictionary term "pentoxifylline"
    A drug used to prevent blood clotting and as a treatment that may help decrease weight loss in people with cancer.
  PEP02: A form of the anticancer drug irinotecan hydrochloride that is contained inside very tiny, fat-like particles and is used with other drugs to treat adults with pancreatic cancer that has spread to other parts of the body. It is used in patients whose cancer has not been treated with other anticancer therapy or has gotten worse after treatment with gemcitabine hydrochloride. It is also being studied in the treatment of other types of cancer. PEP02 may have fewer side effects and work better than other forms of irinotecan hydrochloride. PEP02 blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called irinotecan sucrosofate and Onivyde.
    More Information
    - Irinotecan Sucrosofate (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecan-hydrochloride-liposome)
  Pepaxto: (peh-PAK-stoh)
    Pronunciation of dictionary term "Pepaxto"
    A drug used with dexamethasone to treat adults with multiple myeloma that relapsed (came back) or did not get better after treatment with at least four other anticancer therapies, including an anti-CD38 monoclonal antibody, a proteasome inhibitor, and an immunomodulating agent. It is also being studied in the treatment of other types of cancer. Pepaxto may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of peptide-conjugated alkylating drug. Also called melflufen and melphalan flufenamide hydrochloride.
    More Information
    - Melphalan Flufenamide Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/melphalanflufenamidehydrochloride)
  pepsin: (PEP-sin)
    Pronunciation of dictionary term "pepsin"
    An enzyme made in the stomach that breaks down proteins in food during digestion. Stomach acid changes a protein called pepsinogen into pepsin.
  pepsinogen: (pep-SIH-noh-jen)
    Pronunciation of dictionary term "pepsinogen"
    A substance made by cells in the stomach. Acid in the stomach changes pepsinogen to pepsin, which breaks down proteins in food during digestion.
  peptic ulcer: (PEP-tik UL-ser)
    Pronunciation of dictionary term "peptic ulcer"
    A break in the lining of the lower part of the esophagus, the stomach, or the upper part of the small intestine. Peptic ulcers form when cells on the surface of the lining become inflamed and die. They are usually caused by Helicobacter pylori bacteria and by certain medicines, such as aspirin and other nonsteroidal anti-inflammatory drugs (NSAIDs). Peptic ulcers may be linked to cancer and other diseases.
  peptide: (PEP-tide)
    Pronunciation of dictionary term "peptide"
    A molecule that contains two or more amino acids (the molecules that join together to form proteins). Peptides that contain many amino acids are called polypeptides or proteins.
  peptide 946: (PEP-tide …)
    Pronunciation of dictionary term "peptide 946"
    A piece of a protein found only on melanoma (a type of skin cancer) cells. It is being used in vaccines to help the immune system kill melanoma cells.
  peptide receptor radionuclide therapy: (PEP-tide reh-SEP-ter RAY-dee-oh-NOO-klide THAYR-uh-pee)
    Pronunciation of dictionary term "peptide receptor radionuclide therapy"
    A type of radiation therapy used to treat certain types of neuroendocrine tumors. A radioactive chemical is linked to a peptide (small protein) that targets cancer cells. When this radioactive peptide is injected into the body, it binds to a specific receptor found on some cancer cells. The radioactive peptide builds up in these cells and helps kill the cancer cells without harming normal cells. Peptide receptor radionuclide therapy is a type of targeted therapy. Also called PRRT.
  percutaneous: (per-kyoo-TAY-nee-us)
    Pronunciation of dictionary term "percutaneous"
    Passing through the skin, as an injection or a topical medicine.
  percutaneous endoscopic tube: (per-kyoo-TAY-nee-us en-doh-SKAH-pik gas-TROS-toh-mee toob)
    Pronunciation of dictionary term "percutaneous endoscopic tube"
    A tube inserted through the wall of the abdomen directly into the stomach. It allows air and fluid to leave the stomach and can be used to give drugs and liquids, including liquid food, to the patient. Giving food through a percutaneous endoscopic tube is a type of enteral nutrition. Also called gastrostomy tube and PEG tube.
  percutaneous epididymal sperm aspiration: (per-kyoo-TAY-nee-us eh-pih-DIH-dih-mul … AS-pih-RAY-shun)
    Pronunciation of dictionary term "percutaneous epididymal sperm aspiration"
    A procedure in which a sample of sperm cells is removed from the epididymis through a small needle attached to a syringe. The epididymis is a narrow, tightly-coiled tube that is attached to each of the testicles and is where sperm cells mature and are stored. The sperm is looked at under a microscope in a laboratory, where it may be used right away to fertilize eggs or frozen for future infertility treatment. Percutaneous epididymal sperm aspiration may be useful for men who have fertility problems caused by a blockage that keeps sperm from being ejaculated. This could be caused by previous vasectomy, certain genetic conditions, infection, or other conditions. It may also be useful for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Percutaneous epididymal sperm aspiration is a type of sperm retrieval method.
  percutaneous ethanol injection: (per-kyoo-TAY-nee-us EH-thuh-nol in-JEK-shun)
    Pronunciation of dictionary term "percutaneous ethanol injection"
    An injection of ethanol (alcohol) through the skin directly into a tumor to kill cancer cells. Ultrasound or a CT scan is used to guide the needle into the tumor. Also called alcohol ablation, ethanol ablation, and PEI.
  percutaneous transhepatic biliary drainage: (per-kyoo-TAY-nee-us TRANZ-heh-PA-tik BIH-lee-ayr-ee DRAY-nij)
    Pronunciation of dictionary term "percutaneous transhepatic biliary drainage"
    A procedure to drain bile to relieve pressure in the bile ducts caused by a blockage. An x-ray of the liver and bile ducts locates the blockage of bile flow. Images made by ultrasound guide placement of a stent (tube), which remains in the liver. Bile drains through the stent into the small intestine or into a collection bag outside the body. This procedure may relieve jaundice before surgery. Also called percutaneous transhepatic cholangiodrainage and PTCD.
  percutaneous transhepatic cholangiodrainage: (per-kyoo-TAY-nee-us TRANZ-heh-PA-tik koh-lan-jee-oh-DRAY-nij)
    Pronunciation of dictionary term "percutaneous transhepatic cholangiodrainage"
    A procedure to drain bile to relieve pressure in the bile ducts caused by a blockage. An x-ray of the liver and bile ducts locates the blockage of bile flow. Images made by ultrasound guide placement of a stent (tube), which remains in the liver. Bile drains through the stent into the small intestine or into a collection bag outside the body. This procedure may relieve jaundice before surgery. Also called percutaneous transhepatic biliary drainage and PTCD.
  percutaneous transhepatic cholangiography: (per-kyoo-TAY-nee-us TRANZ-heh-PA-tik koh-lan-jee-AH-gruh-fee)
    Pronunciation of dictionary term "percutaneous transhepatic cholangiography"
    A procedure to x-ray the hepatic and common bile ducts. A contrasting agent is injected through the skin into the liver or bile duct, and the ducts are then x-rayed to find the point of obstruction. Also called PTC.
  performance status: (per-FOR-munts STA-tus)
    Pronunciation of dictionary term "performance status"
    A measure of how well a patient is able to perform ordinary tasks and carry out daily activities.
  perfusion: (per-FYOO-zhun)
    Pronunciation of dictionary term "perfusion"
    Bathing an organ or tissue with a fluid. In regional perfusion, a specific area of the body (usually an arm or a leg) receives high doses of anticancer drugs through a blood vessel. Such a procedure is performed to treat cancer that has not spread.
  perfusion magnetic resonance imaging: (per-FYOO-zhun mag-NEH-tik REH-zuh-nunts IH-muh-jing)
    Pronunciation of dictionary term "perfusion magnetic resonance imaging"
    A special type of magnetic resonance imaging (MRI) that uses an injected dye in order to see blood flow through tissues. Also called magnetic resonance perfusion imaging.
  periampullary cancer: (PAYR-ee-AM-puh-LAYR-ee KAN-ser)
    Pronunciation of dictionary term "periampullary cancer"
    A cancer that forms near the ampulla of Vater (an enlargement of the ducts from the liver and pancreas where they join and enter the small intestine).
  pericardial effusion: (PAYR-ih-KAR-dee-ul eh-FYOO-zhun)
    Pronunciation of dictionary term "pericardial effusion"
    A condition in which extra fluid collects between the heart and the pericardium (the sac around the heart). The extra fluid causes pressure on the heart. This keeps it from pumping blood normally. Lymph vessels may also be blocked, which can cause infection. Pericardial effusions may be caused by cancer or cancer treatment, infection, injury, autoimmune disorders, thyroid or kidney problems, or other conditions.
    More Information
    - Cardiopulmonary Syndromes
  pericardial tamponade: (PAYR-ih-KAR-dee-ul tam-puh-NAYD)
    Pronunciation of dictionary term "pericardial tamponade"
    A serious condition that occurs when extra fluid or blood builds up in the space between the heart and the pericardium (the sac around the heart). The extra fluid causes pressure on the heart, which keeps it from pumping enough blood to the rest the body. Pericardial tamponade is life-threatening and can lead to shock and organ failure if not treated right away. It may be caused by cancer, infection, chest injury, heart surgery, radiation therapy to the chest, autoimmune disease, and heart, thyroid, or kidney problems. Also called cardiac tamponade.
  pericarditis: (PAYR-ih-kar-DY-tis)
    Pronunciation of dictionary term "pericarditis"
    A condition in which the pericardium (the sac around the heart) becomes inflamed. Pericarditis is usually caused by an infection, but it may also be caused by an autoimmune disorder or by cancer or cancer treatment (such as chemotherapy and radiation therapy). It may also be caused by heart attack, heart surgery, injury to the chest, kidney failure, and certain medicines. The most common symptom of pericarditis is chest pain. Other signs and symptoms may include fever, cough, fast or abnormal heartbeat, trouble breathing, anxiety, fatigue, and swelling of the ankles, feet, and legs. Pericarditis is most common in men aged 20 to 50 years.
  pericardium: (PAYR-ih-KAR-dee-um)
    Pronunciation of dictionary term "pericardium"
    The thin, fluid-filled sac that surrounds the heart, including the top of the heart that is connected to major blood vessels, such as the aorta and vena cava. The pericardium is made up of an outer layer of connective tissue that holds the heart in place within the chest, protects it from inflammation, and acts as a barrier against infection. It also keeps the heart from stretching out and filling up with too much blood. The pericardium is also made up of two thin, inner layers of tissue that have a small amount of fluid in between them. The fluid helps keep the tissues from rubbing against each other as the heart moves within the pericardium.
  pericytic tumor: (PAYR-ih-SIH-tik TOO-mer)
    Pronunciation of dictionary term "pericytic tumor"
    A type of soft tissue tumor that begins in cells that wrap around blood vessels. Pericytic tumors may be benign (not cancer) or malignant (cancer). They can occur anywhere in the body. Pericytic tumors may occur in adults or children. Also called perivascular tumor.
  perifosine: (PAYR-ih-FAH-seen)
    Pronunciation of dictionary term "perifosine"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called alkylphospholipids.
  perihilar bile duct cancer: (PAYR-ee-HY-ler bile dukt KAN-ser)
    Pronunciation of dictionary term "perihilar bile duct cancer"
    Cancer that forms in the area where the left and right hepatic ducts join just outside the liver and form the common hepatic duct. Bile ducts carry bile from the liver and gallbladder to the small intestine. Perihilar bile duct cancer is a type of extrahepatic bile duct cancer. Also called Klatskin tumor and perihilar cholangiocarcinoma.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  perihilar cholangiocarcinoma: (PAYR-ee-HY-ler koh-LAN-jee-oh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "perihilar cholangiocarcinoma"
    Cancer that forms in the area where the left and right hepatic ducts join just outside the liver and form the common hepatic duct. Bile ducts carry bile from the liver and gallbladder to the small intestine. Perihilar cholangiocarcinoma is a type of extrahepatic bile duct cancer. Also called Klatskin tumor and perihilar bile duct cancer.
    More Information
    - What Is Bile Duct Cancer (Cholangiocarcinoma)?
    Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
    Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.
  perillyl alcohol: (PAYR-ih-lil AL-kuh-hol)
    Pronunciation of dictionary term "perillyl alcohol"
    A substance that is being studied in the prevention of cancer. It belongs to the family of plant drugs called monoterpenes.
  perimenopausal: (PAYR-ee-MEH-nuh-PAW-zul)
    Pronunciation of dictionary term "perimenopausal"
    Describes the time in a woman’s life when menstrual periods become irregular as she approaches menopause. This is usually three to five years before menopause and is often marked by many of the symptoms of menopause, including hot flashes, mood swings, night sweats, vaginal dryness, trouble concentrating, and infertility.
  perineal colostomy: (PAYR-ih-NEE-ul koh-LOS-toh-mee)
    Pronunciation of dictionary term "perineal colostomy"
    An opening made surgically to allow the colon to exit the body through the perineum (the area of the body between the anus and the vulva in females, and between the anus and the scrotum in males). A colostomy provides a new path for waste material to leave the body after part of the colon has been removed.
  perineal prostatectomy: (PAYR-ih-NEE-ul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "perineal prostatectomy"
    Surgery to remove the prostate through an incision made between the scrotum and the anus.
    Two types of radical prostatectomy. In a retropubic prostatectomy, the prostate is removed through an incision in the wall of the abdomen. In a perineal prostatectomy, the prostate is removed through an incision in the area between the scrotum and the anus.
    Two panel drawing showing two ways of doing a radical prostatectomy; in the first panel, dotted line shows where incision is made through the wall of the abdomen for a retropubic prostatectomy; in the second panel, dotted line shows where incision is made in area between the scrotum and the anus for a perineal prostatectomy.
  perineum: (PAYR-ih-NEE-um)
    Pronunciation of dictionary term "perineum"
    The area of the body between the anus and the vulva in females, and between the anus and the scrotum in males.
    The perineum is the area between the anus and the vulva in females. In males, it is the area between the anus and the scrotum.
    Drawing of the vulva shows the mons pubis, clitoris, urethral opening, inner and outer lips of the vagina, and the vaginal opening. Also shown are the perineum and anus.
  perineural: (payr-ih-NOOR-ul)
    Pronunciation of dictionary term "perineural"
    Around a nerve or group of nerves.
  periodic neutropenia: (PEER-ee-AH-dik noo-troh-PEE-nee-uh)
    Pronunciation of dictionary term "periodic neutropenia"
    A chronic condition that affects neutrophils (a type of white blood cell). In periodic neutropenia, the number of neutrophils in the blood goes in cycles from normal to low and back to normal again. Symptoms include fever, inflamed mucous membranes in the mouth, and infections. Also called cyclic neutropenia.
  perioperative: (PAYR-ee-AH-pruh-tiv)
    Pronunciation of dictionary term "perioperative"
    Around the time of surgery. This usually lasts from the time the patient goes into the hospital or doctor's office for surgery until the time the patient goes home.
  peripheral blood: (peh-RIH-feh-rul blud)
    Pronunciation of dictionary term "peripheral blood"
    Blood circulating throughout the body.
  peripheral blood lymphocyte therapy: (peh-RIH-feh-rul blud LIM-foh-site THAYR-uh-pee)
    Pronunciation of dictionary term "peripheral blood lymphocyte therapy"
    A treatment for Epstein-Barr virus infection or overgrowth of white blood cells (lymphocytes) after an organ or bone marrow transplant. Specific lymphocytes from a sibling donor are infused into the patient to try and reverse these conditions.
  peripheral blood smear: (peh-RIH-feh-rul blud smeer)
    Pronunciation of dictionary term "peripheral blood smear"
    A procedure in which a sample of blood is viewed under a microscope to count different circulating blood cells (red blood cells, white blood cells, platelets, etc.) and see whether the cells look normal.
  peripheral blood stem cell transplant: (peh-RIH-feh-rul ... stem sel TRANZ-plant)
    Pronunciation of dictionary term "peripheral blood stem cell transplant"
    A procedure in which a patient receives healthy blood-forming cells (stem cells) to replace their own stem cells that have been destroyed by disease or by the radiation or high doses of anticancer drugs that are given as part of the procedure. The healthy stem cells may come from the blood of the patient or a donor. A peripheral blood stem cell transplant may be autologous (using a patient’s own stem cells that were collected and saved before treatment), allogeneic (using stem cells donated by someone who is not an identical twin), or syngeneic (using stem cells donated by an identical twin). Also called PBSCT and peripheral stem cell support.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
    Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.
    Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.
  peripheral neuropathy: (peh-RIH-feh-rul noor-AH-puh-thee)
    Pronunciation of dictionary term "peripheral neuropathy"
    A nerve problem that causes pain, numbness, tingling, swelling, or muscle weakness in different parts of the body. It usually begins in the hands or feet and gets worse over time. Peripheral neuropathy may be caused by cancer or cancer treatment, such as chemotherapy. It may also be caused by physical injury, infection, toxic substances, or conditions such as diabetes, kidney failure, or malnutrition. Also called neuropathy.
    More Information
    - Nerve Problems (Peripheral Neuropathy) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nerve-problems)
  peripheral primitive neuroectodermal tumor: (peh-RIH-feh-rul PRIH-muh-tiv NOOR-oh-EK-toh-DER-mul TOO-mer)
    Pronunciation of dictionary term "peripheral primitive neuroectodermal tumor"
    A type of cancer that forms in bone or soft tissue. Also called Ewing sarcoma and pPNET.
    More Information
    - Bone Cancer (https://www.cancer.gov/types/bone)
  peripheral stem cell: (peh-RIH-feh-rul stem sel)
    Pronunciation of dictionary term "peripheral stem cell"
    An immature cell found circulating in the bloodstream. New blood cells develop from peripheral stem cells.
  peripheral stem cell support: (peh-RIH-feh-rul stem sel …)
    Pronunciation of dictionary term "peripheral stem cell support"
    A procedure in which a patient receives healthy blood-forming cells (stem cells) to replace their own stem cells that have been destroyed by disease or by the radiation or high doses of anticancer drugs that are given as part of the procedure. The healthy stem cells may come from the blood of the patient or a donor. A peripheral stem cell support may be autologous (using a patient’s own stem cells that were collected and saved before treatment), allogeneic (using stem cells donated by someone who is not an identical twin), or syngeneic (using stem cells donated by an identical twin). Also called PBSCT and peripheral blood stem cell transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
    Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.
    Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.
  peripheral T-cell lymphoma: (peh-RIH-feh-rul ... lim-FOH-muh)
    Pronunciation of dictionary term "peripheral T-cell lymphoma"
    One of a group of aggressive (fast-growing) non-Hodgkin lymphomas that begin in mature T lymphocytes (T cells that have matured in the thymus gland and gone to other lymphatic sites in the body, including lymph nodes, bone marrow, and spleen). Also called mature T-cell lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  peripheral venous catheter: (peh-RIH-feh-rul VEE-nus KA-theh-ter)
    Pronunciation of dictionary term "peripheral venous catheter"
    A device used to draw blood and give treatments, including intravenous fluids, drugs, or blood transfusions. A thin, flexible tube is inserted into a vein, usually in the back of the hand, the lower part of the arm, or the foot. A needle is inserted into a port to draw blood or give fluids.
    Peripheral venous catheter. A peripheral venous catheter is a thin, flexible tube that is inserted into a vein. It is usually inserted into the lower part of the arm or the back of the hand. It is used to give intravenous fluids, blood transfusions, chemotherapy, and other drugs.
    Peripheral venous catheter; drawing of a peripheral venous catheter in a vein in the lower part of the arm with the catheter tubing clamped and capped off at the end.
  peripherally inserted central catheter: (peh-RIH-feh-ruh-lee in-SER-ted SEN-trul KA-theh-ter)
    Pronunciation of dictionary term "peripherally inserted central catheter"
    A device used to draw blood and give treatments, including intravenous fluids, drugs, or blood transfusions. A thin, flexible tube is inserted into a vein in the upper arm and guided (threaded) into a large vein above the right side of the heart called the superior vena cava. A needle is inserted into a port outside the body to draw blood or give fluids. A peripherally inserted central catheter may stay in place for weeks or months and helps avoid the need for repeated needle sticks. Also called PICC.
    Peripherally inserted central catheter (PICC). A PICC is a thin, flexible tube that is inserted into a vein in the upper arm and guided (threaded) into a large vein above the right side of the heart called the superior vena cava. It is used to give intravenous fluids, blood transfusions, chemotherapy, and other drugs. It is also used for taking blood samples. A PICC line may stay in place for weeks or months and helps avoid the need for repeated needle sticks.
    Peripherally inserted central catheter (PICC); drawing of a PICC line that goes from a vein in the upper right arm to a large vein above the right side of the heart called the superior vena cava. An inset shows a PICC line in the arm with a clear plastic dressing over it. An intravenous line attached to the PICC is also shown.
  peristalsis: (payr-ih-STAL-sis)
    Pronunciation of dictionary term "peristalsis"
    The rippling motion of muscles in the intestine or other tubular organs characterized by the alternate contraction and relaxation of the muscles that propel the contents onward.
  peritoneal: (PAYR-ih-toh-NEE-ul)
    Pronunciation of dictionary term "peritoneal"
    Having to do with the parietal peritoneum (the tissue that lines the abdominal wall and pelvic cavity) and visceral peritoneum (the tissue that covers most of the organs in the abdomen, including the intestines).
  peritoneal carcinomatosis: (PAYR-ih-toh-NEE-ul KAR-sih-NOH-muh-TOH-sis)
    Pronunciation of dictionary term "peritoneal carcinomatosis"
    A serious condition in which cancer, usually of the digestive tract or female reproductive organs, spreads and causes tumors to grow on the peritoneum. The peritoneum is the tissue that lines the abdominal wall and covers most of the organs in the abdomen. Peritoneal carcinomatosis can happen in many types of cancer, but it is most common in people with cancers of the ovary, colon, rectum, stomach, pancreas, or appendix.
  peritoneal cavity: (PAYR-ih-toh-NEE-ul KA-vuh-tee)
    Pronunciation of dictionary term "peritoneal cavity"
    The space within the abdomen that contains the intestines, the stomach, and the liver. It is bound by thin membranes.
    The peritoneal cavity is the space that contains most of the organs in the abdomen, including the liver, stomach, and intestines. The peritoneum is the tissue that lines the abdominal wall and covers most of the organs in the abdomen.
    Drawing shows a cross section of the peritoneal cavity and the peritoneum. Also shown are the liver, stomach, pancreas, large intestine, greater omentum, small intestine, ovary, uterus, bladder, and rectum.
  peritoneal fluid: (PAYR-ih-toh-NEE-ul FLOO-id)
    Pronunciation of dictionary term "peritoneal fluid"
    A liquid that is made in the abdominal cavity to lubricate the surface of the tissue that lines the abdominal wall and pelvic cavity and covers most of the organs in the abdomen.
  peritoneal infusion: (PAYR-ih-toh-NEE-ul in-FYOO-zhun)
    Pronunciation of dictionary term "peritoneal infusion"
    A method of delivering fluids and drugs directly into the abdominal cavity through a thin tube. Also called intraperitoneal infusion.
  peritoneal perfusion: (PAYR-ih-toh-NEE-ul per-FYOO-zhun)
    Pronunciation of dictionary term "peritoneal perfusion"
    A method of delivering fluids and drugs directly to tumors in the peritoneal cavity.
  peritoneal washing: (PAYR-ih-toh-NEE-ul WAH-shing)
    Pronunciation of dictionary term "peritoneal washing"
    A procedure in which a salt-water solution is used to wash the peritoneal cavity and then is removed to check for cancer cells. The peritoneal cavity is the space in the abdomen that contains the intestines, stomach, and liver. Peritoneal washings are commonly done during surgery for cancer of the ovary and uterus, to see if cancer has spread to the peritoneal cavity.
  peritoneum: (PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "peritoneum"
    The tissue that lines the abdominal wall and covers most of the organs in the abdomen.
  peritonitis: (PAYR-ih-tuh-NY-tis)
    Pronunciation of dictionary term "peritonitis"
    Inflammation of the peritoneum (tissue that lines the abdominal wall and covers most of the organs in the abdomen). Peritonitis can result from infection, injury, or certain diseases. Symptoms may include swelling of the abdomen, severe pain, and weight loss.
  perivascular epithelioid cell tumor: (PAYR-ee-VAS-kyoo-ler eh-pih-THEE-lee-oyd sel TOO-mer)
    Pronunciation of dictionary term "perivascular epithelioid cell tumor"
    A family of rare tumors that form in the soft tissues of the stomach, intestines, lungs, female reproductive organs, and genitourinary organs. Most perivascular epithelioid cell tumors are benign (not cancer). They often occur in children with an inherited condition called tuberous sclerosis. Also called PEComa.
  perivascular tumor: (PAYR-ee-VAS-kyoo-ler TOO-mer)
    Pronunciation of dictionary term "perivascular tumor"
    A type of soft tissue tumor that begins in cells that wrap around blood vessels. Perivascular tumors may be benign (not cancer) or malignant (cancer). They can occur anywhere in the body. Perivascular tumors may occur in adults or children. Also called pericytic tumor.
  Perjeta: (per-JEH-tuh)
    Pronunciation of dictionary term "Perjeta"
    A drug used with other drugs to treat breast cancer that is HER2 positive. It is used in patients whose cancer has spread to other parts of the body and has not already been treated with other anticancer drugs. It is also used before surgery in patients with locally advanced, inflammatory, or early-stage breast cancer and after surgery in patients with early-stage breast cancer who have a high risk that their cancer will recur (come back). It is also being studied in the treatment of other types of cancer. Perjeta binds to a protein called HER2, which is found on some cancer cells. Blocking this protein may help kill cancer cells. Perjeta is a type of monoclonal antibody. Also called pertuzumab.
    More Information
    - Pertuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/pertuzumab)
  pernicious anemia: (per-NIH-shus uh-NEE-mee-uh)
    Pronunciation of dictionary term "pernicious anemia"
    A condition in which the body is unable to properly absorb vitamin B12, leading to a lower-than-normal number of red blood cells in the body. Vitamin B12 binds to a protein in the stomach called intrinsic factor. This allows vitamin B12 to be absorbed in the small intestine and then released into the bloodstream. Pernicious anemia occurs when there is too little intrinsic factor to bind enough vitamin B12 for it to be used by the body to make red blood cells. In most cases, this happens when the body’s immune system attacks the intrinsic factor protein or the cells in the lining of the stomach that make it. It may also occur in people with atrophic gastritis, a condition marked by chronic inflammation and thinning of the inner lining of the stomach. If not treated, pernicious anemia can lead to serious problems, including damage to the nervous system. People with pernicious anemia may have an increased risk of stomach cancer, gastrointestinal neuroendocrine tumors, or some other types of cancer.
  peroxisome proliferator-activated receptor gamma pathway: (peh-ROK-sih-some proh-LIH-feh-RAY-ter-AK-tih-vay-ted reh-SEP-ter GA-muh PATH-way)
    Pronunciation of dictionary term "peroxisome proliferator-activated receptor gamma pathway"
    Describes a group of proteins in a cell that work together to help control how certain genes are expressed and the use of lipids (fats) and glucose (sugar) in the body. Changes in the peroxisome proliferator-activated receptor gamma pathway may lead to diseases such as heart disease, diabetes, and cancer. Drugs or substances that affect this pathway are being studied in the prevention and treatment of cancer and other diseases. Also called PPAR gamma pathway.
  personal health record: (PER-suh-nul helth REH-kurd)
    Pronunciation of dictionary term "personal health record"
    A collection of information about a person’s health that allows the person to manage and track his or her own health information. A personal health record may include information about allergies, illnesses, surgeries, immunizations, and results of physical exams, tests, and screenings. It may also include information about medicines taken and health habits, such as diet and exercise. Also called personal history, personal medical history, and PHR.
  personal history: (PER-suh-nul HIH-stuh-ree)
    Pronunciation of dictionary term "personal history"
    A collection of information about a person’s health that allows the person to manage and track his or her own health information. A personal history may include information about allergies, illnesses, surgeries, immunizations, and results of physical exams, tests, and screenings. It may also include information about medicines taken and health habits, such as diet and exercise. Also called personal health record, personal medical history, and PHR.
  personal medical history: (PER-suh-nul MEH-dih-kul HIH-stuh-ree)
    Pronunciation of dictionary term "personal medical history"
    A collection of information about a person’s health that allows the person to manage and track his or her own health information. A personal medical history may include information about allergies, illnesses, surgeries, immunizations, and results of physical exams, tests, and screenings. It may also include information about medicines taken and health habits, such as diet and exercise. Also called personal health record, personal history, and PHR.
  personalized medicine: (PER-suh-nuh-LIZED MEH-dih-sin)
    Pronunciation of dictionary term "personalized medicine"
    A form of medicine that uses information about a person’s own genes or proteins to prevent, diagnose, or treat disease. In cancer, personalized medicine uses specific information about a person’s tumor to help make a diagnosis, plan treatment, find out how well treatment is working, or make a prognosis. Examples of personalized medicine include using targeted therapies to treat specific types of cancer cells, such as HER2-positive breast cancer cells, or using tumor marker testing to help diagnose cancer. Also called precision medicine.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  perturbation: (PER-ter-BAY-shun)
    Pronunciation of dictionary term "perturbation"
    A disruption or disturbance.
  pertussis: (per-TUH-sis)
    Pronunciation of dictionary term "pertussis"
    A serious bacterial infection of the lungs and breathing tubes that spreads easily. Pertussis begins like a cold, but develops into severe coughing and gasping for air. Long spells of coughing may cause vomiting, and broken blood vessels in the eyes and on the skin. Also called whooping cough.
  pertuzumab: (per-TOO-zoo-mab)
    Pronunciation of dictionary term "pertuzumab"
    A drug used with other drugs to treat breast cancer that is HER2 positive. It is used in patients whose cancer has spread to other parts of the body and has not already been treated with other anticancer drugs. It is also used before surgery in patients with locally advanced, inflammatory, or early-stage breast cancer and after surgery in patients with early-stage breast cancer who have a high risk that their cancer will recur (come back). It is also being studied in the treatment of other types of cancer. Pertuzumab binds to a protein called HER2, which is found on some cancer cells. Blocking this protein may help kill cancer cells. Pertuzumab is a type of monoclonal antibody. Also called Perjeta.
    More Information
    - Pertuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/pertuzumab)
  pertuzumab, trastuzumab, and hyaluronidase: (per-TOO-zoo-mab tras-TOO-zoo-mab … HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "pertuzumab, trastuzumab, and hyaluronidase"
    A combination of three drugs used with other drugs to treat adults with HER2-positive breast cancer. It is used before surgery in patients with locally advanced, inflammatory, or early-stage breast cancer and after surgery in patients with early-stage breast cancer who have a high risk that their cancer will recur (come back). It is also used to treat patients with breast cancer that has spread to other parts of the body and has not already been treated with anti-HER2 therapy or chemotherapy. Pertuzumab and trastuzumab bind to a protein called HER2, which is found on some breast cancer cells. Pertuzumab and trastuzumab may block HER2 and help the immune system kill cancer cells. Hyaluronidase allows pertuzumab and trastuzumab to be given by injection under the skin. Pertuzumab, trastuzumab, and hyaluronidase can be given in less time than pertuzumab or trastuzumab alone, which are given as infusions. Also called Phesgo.
    More Information
    - Pertuzumab, Trastuzumab, and Hyaluronidase-zzxf (https://www.cancer.gov/about-cancer/treatment/drugs/pertuzumabtrastuzumabandhyaluronidase-zzxf)
  pesticide: (PES-tih-side)
    Pronunciation of dictionary term "pesticide"
    Any substance that is used to kill insects and other pests.
  PET scan: (… skan)
    Pronunciation of dictionary term "PET scan"
    A procedure in which a small amount of radioactive glucose (sugar) is injected into a vein, and a scanner is used to make detailed, computerized pictures of areas inside the body where the glucose is taken up. Because cancer cells often take up more glucose than normal cells, the pictures can be used to find cancer cells in the body. Also called positron emission tomography scan.
    PET (positron emission tomography) scan. The patient lies on a table that slides through the PET machine. The head rest and white strap help the patient lie still. A small amount of radioactive glucose (sugar) is injected into the patient's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.
    PET (positron emission tomography) scan; drawing shows patient lying on table that slides through the PET machine.
  PET-CT scan: (… skan)
    Pronunciation of dictionary term "PET-CT scan"
    A procedure that combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time with the same machine. The combined scans give more detailed pictures of areas inside the body than either scan gives by itself. A PET-CT scan may be used to help diagnose disease, such as cancer, plan treatment, or find out how well treatment is working. Also called positron emission tomography-computed tomography scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  pet-facilitated therapy: (…fuh-SIH-lih-tay-ted THAYR-uh-pee)
    Pronunciation of dictionary term "pet-facilitated therapy"
    A type of therapy that uses dogs or other pets to improve the physical and mental health of patients with certain acute or chronic diseases. It is being studied as a way to relieve distress in cancer patients undergoing treatment for pain. Also called animal-assisted therapy.
  PET-MRI scan: (… skan)
    Pronunciation of dictionary term "PET-MRI scan"
    A procedure that combines the pictures from a positron emission tomography (PET) scan and a magnetic resonance imaging (MRI) scan. A PET scan uses a radioactive tracer to highlight abnormal areas in the body. An MRI scan uses radio waves and a powerful magnet to take detailed pictures of tissues in the body. For a PET-MRI scan, the scans are done at the same time with the same machine. The combined scans give more detailed pictures of areas inside the body than either scan gives by itself. The overall amount of radiation a person is exposed to is also reduced. A PET-MRI scan may be used to help diagnose disease, such as cancer, plan treatment, or find out how well treatment is working. Also called positron emission tomography-magnetic resonance imaging scan.
  petechiae: (peh-TEE-kee-ee)
    Pronunciation of dictionary term "petechiae"
    Pinpoint, unraised, round red spots under the skin caused by bleeding.
  petrolatum: (PEH-troh-LAY-tum)
    Pronunciation of dictionary term "petrolatum"
    A thick, greasy, substance with no odor or taste made from petroleum (mixture of oily liquids found in the earth). Petrolatum is used on the skin to prevent drying and to help heal scrapes and burns. It is also used as a base for some ointments. Also called petroleum jelly.
  petroleum jelly: (peh-TROH-lee-um …)
    Pronunciation of dictionary term "petroleum jelly"
    A thick, greasy, substance with no odor or taste made from petroleum (mixture of oily liquids found in the earth). Petroleum jelly is used on the skin to prevent drying and to help heal scrapes and burns. It is also used as a base for some ointments. Also called petrolatum.
  Peutz-Jeghers syndrome: (putz-JAY-gerz SIN-drome)
    Pronunciation of dictionary term "Peutz-Jeghers syndrome"
    A rare genetic disorder in which many polyps (abnormal growths of tissue) form in the lining of the gastrointestinal tract, and dark-colored spots appear on certain areas of the skin, such as around the mouth, eyes, and nose. People with Peutz-Jeghers syndrome have a very high risk of developing gastrointestinal cancer and other types of cancer, including cancers of the breast, pancreas, ovary, lung, and cervix. Peutz-Jeghers syndrome is usually caused by mutations (changes) in the STK11 gene. Some people with Peutz-Jeghers syndrome do not have a mutation in the STK11 gene. In these cases, the cause of the disorder is unknown. Also called PJS.
    More Information
    - Peutz-Jeghers syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7378/peutz-jeghers-syndrome)
    - Peutz-Jeghers syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/peutz-jeghers-syndrome/)
  pevonedistat: (PEH-voh-NEH-dih-stat)
    Pronunciation of dictionary term "pevonedistat"
    A substance being studied in the treatment of some types of cancer. Pevonedistat blocks an enzyme called NEDD8-activating enzyme (NAE), which is involved in cell division. Blocking this enzyme may help keep cancer cells from growing and may kill them. Pevonedistat is a type of NAE inhibitor and a type of targeted therapy.
  pexidartinib hydrochloride: (PEK-sih-DAR-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "pexidartinib hydrochloride"
    A drug used to treat adults with tenosynovial giant cell tumor (a rare, usually benign tumor that affects the joints). It is used in patients who have a severe form of the disease that is not likely to get better with surgery. It is also being studied in the treatment of some types of cancer and other conditions. Pexidartinib hydrochloride blocks certain proteins, which may help keep tumor cells from growing and spreading. It is a type of tyrosine kinase inhibitor. Also called Turalio.
    More Information
    - Pexidartinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/pexidartinib)
  PF-00299804: A drug used to treat non-small cell lung cancer that has spread, has not already been treated, and has certain mutations (changes) in the EGFR gene. It is also being studied in the treatment of other types of cancer. PF-00299804 blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called dacomitinib and Vizimpro.
    More Information
    - Dacomitinib (https://www.cancer.gov/about-cancer/treatment/drugs/dacomitinib)
  PF-02341066: A drug used to treat non-small cell lung cancer that has spread to other parts of the body. It is used in patients whose cancer has a mutated (changed) form of the anaplastic lymphoma kinase (ALK) gene or the ROS1 gene. It is also being studied in the treatment of other types of cancer. PF-02341066 blocks the proteins made by the mutated ALK and ROS1 genes. Blocking these proteins may stop the growth and spread of cancer cells. PF-02341066 may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called crizotinib, MET tyrosine kinase inhibitor PF-02341066, and Xalkori.
    More Information
    - Crizotinib (https://www.cancer.gov/about-cancer/treatment/drugs/crizotinib)
  PF-3512676: A substance that is being studied in the treatment of some types of cancer. It belongs to the family of drugs called biological response modifiers. Also called CpG 7909 and ProMune.
  PFIC: A rare, inherited disorder marked by a buildup in the liver of bile (fluid that helps digest fat). This can lead to liver disease and liver failure. It may also increase the risk of liver cancer. PFIC is caused by mutations (changes) in certain genes that make proteins needed to help the liver work the way it should. It usually occurs in infants and children. Also called progressive familial intrahepatic cholestasis.
    More Information
    - Progressive familial intrahepatic cholestasis (MedlinePlus) (https://medlineplus.gov/genetics/condition/progressive-familial-intrahepatic-cholestasis/)
    - Progressive familial intrahepatic cholestasis 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9802/progressive-familial-intrahepatic-cholestasis)
  PFS: The length of time during and after the treatment of a disease, such as cancer, that a patient lives with the disease but it does not get worse. In a clinical trial, measuring the PFS is one way to see how well a new treatment works. Also called progression-free survival.
  PFT: A test used to measure how well the lungs work. It measures how much air the lungs can hold and how quickly air is moved into and out of the lungs. It also measures how much oxygen is used and how much carbon dioxide is given off during breathing. A PFT can be used to diagnose a lung disease and to see how well treatment for the disease is working. Also called lung function test and pulmonary function test.
  PG: One of several hormone-like substances made by the body. Different PGs control blood pressure, contraction of smooth muscles, and other processes within tissues where they are made. Certain PGs are being studied as cancer biomarkers. Also called prostaglandin.
  PGE1: A drug that is used to treat impotence (inability to have an erection) and is being studied in the treatment of sexual problems in men who have had surgery for prostate cancer. It is a type of vasodilator. Also called alprostadil and prostaglandin E1.
  pH: A measure of how acidic or basic a substance or solution is. pH is measured on a scale of 0 to 14. On this scale, a pH value of 7 is neutral, which means it is neither acidic nor basic. A pH value of less than 7 means it is more acidic, and a pH value of more than 7 means it is more basic. In medicine, having the right pH in the blood and other body fluids is important for the body to work the way it should.
  PHA-739358: A substance being studied in the treatment of chronic myelogenous leukemia. PHA-739358 may stop tumor growth by blocking certain enzymes needed for cancer cells to divide and causing them to die. It is a type of kinase inhibitor.
  PHACE syndrome: (… SIN-drome)
    Pronunciation of dictionary term "PHACE syndrome"
    A rare disorder marked by a hemangioma (a benign blood vessel tumor) that spreads across an area of the body, usually the face, head, or neck. Other health problems that affect the large blood vessels, heart, eyes, or brain may also occur. PHACE syndrome may also cause developmental delays, hearing problems, thyroid problems, and migraines. PHACE syndrome usually occurs in infants and is much more common in girls than boys.
    More Information
    - PHACE syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8338/phace-syndrome)
  phagocyte: (FA-goh-site)
    Pronunciation of dictionary term "phagocyte"
    A type of immune cell that can surround and kill microorganisms, ingest foreign material, and remove dead cells. It can also boost immune responses. Monocytes, macrophages, and neutrophils are phagocytes. A phagocyte is a type of white blood cell.
  phagocytosis: (FA-goh-sy-TOH-sis)
    Pronunciation of dictionary term "phagocytosis"
    The process by which a phagocyte (a type of white blood cell) surrounds and destroys foreign substances (such as bacteria) and removes dead cells.
  phantom limb pain: (FAN-tum lim payn)
    Pronunciation of dictionary term "phantom limb pain"
    The sensation of pain or other unpleasant feelings in the place of a missing (phantom) limb.
  pharmacist: (FAR-muh-sist)
    Pronunciation of dictionary term "pharmacist"
    A health professional who has special training in preparing and dispensing (giving out) prescription drugs. Pharmacists have been taught how drugs work, how to use them, and their side effects.
  pharmacogenetics: (FAR-muh-koh-jeh-NEH-tix)
    Pronunciation of dictionary term "pharmacogenetics"
    The study of how a person’s genes affect the way he or she responds to drugs. Pharmacogenetics is being used to learn ahead of time what the best drug or the best dose of a drug will be for a person. Also called pharmacogenomics.
  pharmacogenomics: (FAR-muh-koh-jeh-NOH-mix)
    Pronunciation of dictionary term "pharmacogenomics"
    The study of how a person’s genes affect the way he or she responds to drugs. Pharmacogenomics is being used to learn ahead of time what the best drug or the best dose of a drug will be for a person. Also called pharmacogenetics.
  pharmacokinetics: (FAR-muh-koh-kih-NEH-tix)
    Pronunciation of dictionary term "pharmacokinetics"
    The activity of drugs in the body over a period of time, including the processes by which drugs are absorbed, distributed in the body, localized in the tissues, and excreted.
  pharmacologic substance: (FAR-muh-koh-LAH-jik SUB-stunts)
    Pronunciation of dictionary term "pharmacologic substance"
    The main ingredient in a medicine that causes the desired effect of the medicine. Some medicines contain more than one pharmacologic substance that act in different ways in the body. Also called active pharmaceutical ingredient, API, and drug substance.
  pharmacology: (FAR-muh-KAH-loh-jee)
    Pronunciation of dictionary term "pharmacology"
    The study of the origin, chemistry, and uses of drugs and their effects on the body.
  pharmacopoeia: (FAR-muh-koh-PEE-uh)
    Pronunciation of dictionary term "pharmacopoeia"
    A book describing chemicals, drugs, and other substances and how they are used as medicines. It is prepared by a recognized authority.
  pharmacovigilance: (FAR-muh-koh-VIH-juh-lunts)
    Pronunciation of dictionary term "pharmacovigilance"
    The science and practice of continuously reviewing the safety of drugs as they are tested in clinical trials and marketed for use. As part of pharmacovigilance, data about the problems caused by treatment with a drug are collected and analyzed. This process helps find ways to prevent adverse events and improve the safety of drugs. Also called PV.
  pharyngeal cancer: (fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "pharyngeal cancer"
    Cancer that forms in tissues of the pharynx. The pharynx is the hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. Pharyngeal cancer includes cancer of the nasopharynx (the upper part of the pharynx behind the nose), the oropharynx (the middle part of the pharynx), and the hypopharynx (the bottom part of the pharynx). Most pharyngeal cancers are squamous cell carcinomas (cancers that begin in thin, flat cells that look like fish scales under a microscope).
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Anatomy of the pharynx. The pharynx is a hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. The three parts of the pharynx are the nasopharynx, oropharynx, and hypopharynx.
    Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.
  pharyngectomy: (FAYR-in-JEK-toh-mee)
    Pronunciation of dictionary term "pharyngectomy"
    Surgery to remove all or part of the pharynx (throat). The pharynx is the hollow tube inside the neck that starts behind the nose and ends at the top of the trachea (windpipe) and esophagus (the tube that goes to the stomach). A pharyngectomy may be done to treat certain types of throat cancer.
    Anatomy of the pharynx. The pharynx is a hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. The three parts of the pharynx are the nasopharynx, oropharynx, and hypopharynx.
    Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.
  pharynx: (FAYR-inx)
    Pronunciation of dictionary term "pharynx"
    The hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. It includes the nasopharynx (the upper part of the pharynx behind the nose), the oropharynx (the middle part of the pharynx), and the hypopharynx (the bottom part of the pharynx). The pharynx acts as a passageway for air to enter the larynx and lungs and food and liquid to enter the esophagus. It also plays a role in speech. The pharynx is about 5 inches long, depending on body size.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Anatomy of the pharynx. The pharynx is a hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. The three parts of the pharynx are the nasopharynx, oropharynx, and hypopharynx.
    Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.
  phase 1 clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase 1 clinical trial"
    The first step in testing a new treatment in humans. A phase 1 clinical trial tests the safety, side effects, best dose, and timing of a new treatment. It may also test the best way to give a new treatment (for example, by mouth, infusion into a vein, or injection) and how the treatment affects the body. The dose is usually increased a little at a time in order to find the highest dose that does not cause harmful side effects. Phase 1 clinical trials usually include only a small number of patients who have not been helped by other treatments. Sometimes they include healthy volunteers. Also called phase I clinical trial.
  phase 1/phase 2 clinical trial: (fayz …/fayz ... KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase 1/phase 2 clinical trial"
    A study that tests the safety, side effects, and best dose of a new treatment. Phase 1/phase 2 clinical trials also test how well a certain type of cancer or other disease responds to a new treatment. In the phase 2 part of the clinical trial, patients usually receive the highest dose of treatment that did not cause harmful side effects in the phase 1 part of the clinical trial. Combining phases 1 and 2 may allow research questions to be answered more quickly or with fewer patients. Also called phase I/II clinical trial.
  phase 2 clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase 2 clinical trial"
    A study that tests whether a new treatment works for a certain type of cancer or other disease (for example, whether it shrinks a tumor or improves blood test results). Phase 2 clinical trials may also provide more information about the safety of the new treatment and how the treatment affects the body. Also called phase II clinical trial.
  phase 2/phase 3 clinical trial: (fayz …/fayz ... KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase 2/phase 3 clinical trial"
    A study that tests how well a new treatment works for a certain type of cancer or other disease and compares the new treatment with a standard treatment. Phase 2/phase 3 clinical trials may also provide more information about the safety and side effects of the new treatment. Combining phases 2 and 3 may allow research questions to be answered more quickly or with fewer patients. Also called phase II/III clinical trial.
  phase 3 clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase 3 clinical trial"
    A study that tests the safety and how well a new treatment works compared with a standard treatment. For example, phase 3 clinical trials may compare which group of patients has better survival rates or fewer side effects. In most cases, treatments move into phase 3 clinical trials only after they meet the goals of phase 1 and phase 2 clinical trials. Phase 3 clinical trials may include hundreds of people. Also called phase III clinical trial.
  phase 4 clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase 4 clinical trial"
    A type of clinical trial that studies the side effects caused over time by a new treatment after it has been approved and is on the market. These trials look for side effects that were not seen in earlier trials and may also study how well a new treatment works over a long period of time. Phase 4 clinical trials may include thousands of people. Also called phase IV clinical trial and post-marketing surveillance trial.
  phase I clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase I clinical trial"
    The first step in testing a new treatment in humans. A phase I clinical trial tests the safety, side effects, best dose, and timing of a new treatment. It may also test the best way to give a new treatment (for example, by mouth, infusion into a vein, or injection) and how the treatment affects the body. The dose is usually increased a little at a time in order to find the highest dose that does not cause harmful side effects. Phase I clinical trials usually include only a small number of patients who have not been helped by other treatments. Sometimes they include healthy volunteers. Also called phase 1 clinical trial.
  phase I detoxification: (fayz ... dee-TOK-sih-fih-KAY-shun)
    Pronunciation of dictionary term "phase I detoxification"
    A process in which the liver uses one of two major enzyme pathways to change a toxic substance, such as an anticancer drug, into a less toxic substance that is easier for the body to excrete.
  phase I/II clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase I/II clinical trial"
    A study that tests the safety, side effects, and best dose of a new treatment. Phase I/II clinical trials also test how well a certain type of cancer or other disease responds to a new treatment. In the phase II part of the clinical trial, patients usually receive the highest dose of treatment that did not cause harmful side effects in the phase I part of the clinical trial. Combining phases I and II may allow research questions to be answered more quickly or with fewer patients. Also called phase 1/phase 2 clinical trial.
  phase II clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase II clinical trial"
    A study that tests whether a new treatment works for a certain type of cancer or other disease (for example, whether it shrinks a tumor or improves blood test results). Phase II clinical trials may also provide more information about the safety of the new treatment and how the treatment affects the body. Also called phase 2 clinical trial.
  phase II detoxification: (fayz ... dee-TOK-sih-fih-KAY-shun)
    Pronunciation of dictionary term "phase II detoxification"
    A process in which the liver uses one of two major enzyme pathways to change a toxic substance, such as an anticancer drug, into a less toxic substance that is easier for the body to excrete. In phase II detoxification, liver cells add a substance (such as cysteine, glycine, or a sulfur molecule) to a toxic chemical or drug, to make it less harmful.
  phase II/III clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase II/III clinical trial"
    A study that tests how well a new treatment works for a certain type of cancer or other disease and compares the new treatment with a standard treatment. Phase II/III clinical trials may also provide more information about the safety and side effects of the new treatment. Combining phases II and III may allow research questions to be answered more quickly or with fewer patients. Also called phase 2/phase 3 clinical trial.
  phase III clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase III clinical trial"
    A study that tests the safety and how well a new treatment works compared with a standard treatment. For example, phase III clinical trials may compare which group of patients has better survival rates or fewer side effects. In most cases, treatments move into phase III clinical trials only after they meet the goals of phase I and phase II clinical trials. Phase III clinical trials may include hundreds of people. Also called phase 3 clinical trial.
  phase IV clinical trial: (fayz … KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "phase IV clinical trial"
    A type of clinical trial that studies the side effects caused over time by a new treatment after it has been approved and is on the market. These trials look for side effects that were not seen in earlier trials and may also study how well a new treatment works over a long period of time. Phase IV clinical trials may include thousands of people. Also called phase 4 clinical trial and post-marketing surveillance trial.
  phenethyl isothiocyanate: (feh-NEH-thul I-soh-THY-oh-SY-uh-nayt)
    Pronunciation of dictionary term "phenethyl isothiocyanate"
    A substance being studied in the prevention of cancer. It is a naturally occurring compound found in some cruciferous vegetables. Also called PEITC.
  phenobarbital: (FEE-noh-BAR-bih-tal)
    Pronunciation of dictionary term "phenobarbital"
    A drug that is used to treat seizures and as a sedative. It is being studied in the treatment of diarrhea and for its ability to increase the antitumor effect of other therapies. It belongs to the family of drugs called barbiturates.
  phenol: (FEE-nol)
    Pronunciation of dictionary term "phenol"
    A very poisonous chemical substance made from tar and also found in some plants and essential oils (scented liquid taken from plants). Phenol is used to make plastics, nylon, epoxy, medicines, and to kill germs. Also called carbolic acid.
  phenothiazine: (FEE-noh-THY-uh-zeen)
    Pronunciation of dictionary term "phenothiazine"
    A type of drug that is used to treat severe mental and emotional disorders, severe nausea and vomiting, and certain other conditions. It belongs to the families of drugs called antipsychotics and antiemetics.
  phenotype: (FEE-noh-tipe)
    Pronunciation of dictionary term "phenotype"
    The physical, biochemical, and behavioral traits that can be observed in a person. Some examples of a person’s phenotype are height, eye color, hair color, blood type, behavior, and the presence of certain diseases. A phenotype is based on a person’s genes and some environmental factors, such as diet, exercise, and smoking.
    More Information
    - Phenotype (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=152)
  phenoxodiol: (fih-NOK-soh-DY-ol)
    Pronunciation of dictionary term "phenoxodiol"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called signal transduction inhibitors.
  phenylacetate: (FEH-nil-A-seh-tayt)
    Pronunciation of dictionary term "phenylacetate"
    A substance that is being studied in the treatment of cancer.
  phenylbutyrate: (FEH-nil-BYOO-tuh-rayt)
    Pronunciation of dictionary term "phenylbutyrate"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called differentiating agents.
  phenylketonuria: (FEH-nil-KEE-tone-yoor-ee-uh)
    Pronunciation of dictionary term "phenylketonuria"
    An inherited disorder that causes a build-up of a substance called phenylalanine in the blood and other body fluids. Phenylalanine is an amino acid (a building block of proteins), so certain foods, such as meat, eggs, nuts, and milk, contain high levels. Some artificial sweeteners, such as aspartame, also contain high levels of phenylalanine. The signs and symptoms of phenylketonuria can be mild or severe and may include light skin and hair, skin rashes, seizures, developmental delays, and movement, behavioral, and mental or psychological problems. The breath, skin, or urine may also have a musty odor. If not treated, phenylketonuria can lead to permanent intellectual disability. All babies born in the United States and many other countries are screened for phenylketonuria using a simple blood test. There is no cure, but phenylketonuria can be managed with a diet low in phenylalanine. Also called PKU.
    More Information
    - Phenylketonuria (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7383/phenylketonuria)
    - Phenylketonuria (MedlinePlus) (https://medlineplus.gov/genetics/condition/phenylketonuria/)
  phenytoin sodium: (FEH-nih-toh-in SOH-dee-um)
    Pronunciation of dictionary term "phenytoin sodium"
    A drug used to treat or prevent seizures or convulsions that may be caused by epilepsy, brain surgery, or treatment for brain cancer. It is a type of anticonvulsant agent. Also called Dilantin.
  pheochromocytoma: (FEE-oh-KROH-moh-sy-TOH-muh)
    Pronunciation of dictionary term "pheochromocytoma"
    Tumor that forms in the center of the adrenal gland (gland located above the kidney) that causes it to make too much adrenaline. Pheochromocytomas are usually benign (not cancer) but can cause high blood pressure, pounding headaches, heart palpitations, flushing of the face, nausea, and vomiting.
  pheresis: (feh-REE-sis)
    Pronunciation of dictionary term "pheresis"
    A process in which a machine removes blood stem cells or other parts of the blood from a person’s bloodstream then returns the rest to the body. During pheresis, blood flows through a catheter inserted into a large vein in a person’s arm or chest into a machine that separates and removes stem cells or other types of blood cells (such as platelets, white blood cells, or red blood cells), or plasma (the liquid part of the blood) from the blood. The rest of the blood is then returned to the body through the catheter. Pheresis may be done to collect blood stem cells before a stem cell transplant or to remove abnormal blood cells or proteins from the blood. It may be used to treat certain types of blood disorders, blood cancer, autoimmune disorders, or other conditions. Also called apheresis.
    Apheresis. A procedure that uses a special machine to collect blood stem cells or other parts of the blood from a person's bloodstream. The rest of the blood is then returned to the body.
    Apheresis; drawing of stem cells being collected from a person's bloodstream using an apheresis machine. Blood is removed from a vein in the person's arm and flows through the machine where the stem cells are removed. The rest of the blood is returned to the person through a vein in the other arm.
  Phesgo: (FES-goh)
    Pronunciation of dictionary term "Phesgo"
    A combination of pertuzumab, trastuzumab, and hyaluronidase used with other drugs to treat adults with HER2-positive breast cancer. It is used before surgery in patients with locally advanced, inflammatory, or early-stage breast cancer and after surgery in patients with early-stage breast cancer who have a high risk that their cancer will recur (come back). It is also used to treat patients with breast cancer that has spread to other parts of the body and has not already been treated with anti-HER2 therapy or chemotherapy. Pertuzumab and trastuzumab bind to a protein called HER2, which is found on some breast cancer cells. Pertuzumab and trastuzumab may block HER2 and help the immune system kill cancer cells. Hyaluronidase allows pertuzumab and trastuzumab to be given by injection under the skin. Phesgo can be given in less time than pertuzumab or trastuzumab alone, which are given as infusions. Also called pertuzumab, trastuzumab, and hyaluronidase.
    More Information
    - Pertuzumab, Trastuzumab, and Hyaluronidase-zzxf (https://www.cancer.gov/about-cancer/treatment/drugs/pertuzumabtrastuzumabandhyaluronidase-zzxf)
  Philadelphia chromosome: (FIH-luh-DEL-fee-uh KROH-muh-some)
    Pronunciation of dictionary term "Philadelphia chromosome"
    An abnormal version of chromosome 22 that contains a fusion of two genes, the ABL1 gene and the BCR gene. This fusion gene is made when part of the ABL1 gene on chromosome 9 breaks off and attaches to the BCR gene on chromosome 22. The protein made by the BCR::ABL1 fusion gene can cause immature white blood cells to grow uncontrollably and build up in the bone marrow and blood. The Philadelphia chromosome is found in the bone marrow cells of almost all people with chronic myelogenous leukemia and some people with acute lymphocytic leukemia or acute myelogenous leukemia.
    The Philadelphia (Ph) chromosome is an abnormal chromosome that is made when pieces of chromosomes 9 and 22 break off and trade places. The ABL1 gene from chromosome 9 joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the fusion gene on it is called the Ph chromosome.
    Philadelphia chromosome; three-panel drawing shows a piece of chromosome 9 and a piece of chromosome 22 breaking off and trading places, creating a changed chromosome 22 called the Philadelphia chromosome. In the left panel, the drawing shows a normal chromosome 9 with the ABL1 gene and a normal chromosome 22 with the BCR gene. In the center panel, the drawing shows part of the ABL1 gene breaking off from chromosome 9 and a piece of chromosome 22 breaking off, below the BCR gene. In the right panel, the drawing shows chromosome 9 with the piece from chromosome 22 attached. It also shows a shortened version of chromosome 22 with the piece from chromosome 9 containing part of the ABL1 gene attached. The ABL1 gene joins to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The changed chromosome 22 with the BCR::ABL1 fusion gene on it is called the Philadelphia chromosome.
  Philadelphia chromosome positive: (FIH-luh-DEL-fee-uh KROH-muh-some PAH-zih-tiv)
    Pronunciation of dictionary term "Philadelphia chromosome positive"
    Describes cancer cells that have an abnormal chromosome called the Philadelphia (Ph) chromosome. The Ph chromosome is made when part of the ABL1 gene on chromosome 9 breaks off and attaches to the BCR gene on chromosome 22 to form the BCR::ABL1 fusion gene. The protein made by the BCR::ABL1 fusion gene can cause immature white blood cells to grow uncontrollably and build up in the bone marrow and blood. The Ph chromosome is found in the bone marrow cells of almost all people with chronic myelogenous leukemia and some people with acute lymphocytic leukemia or acute myelogenous leukemia. Knowing whether a cancer is Ph chromosome positive may help plan treatment.
  philosophical: (FIH-luh-SAH-fih-kul)
    Pronunciation of dictionary term "philosophical"
    Having to do with the deeper questions of life and with a person’s basic beliefs, ideas, and attitudes.
  phlebitis: (fleh-BY-tis)
    Pronunciation of dictionary term "phlebitis"
    Inflammation (redness, swelling, pain, and heat) of a vein, usually in the legs. Phlebitis may be caused by infection, injury, or irritation.
  phlebotomy: (fleh-BAH-toh-mee)
    Pronunciation of dictionary term "phlebotomy"
    A procedure in which a needle is used to take blood from a vein, usually for laboratory testing. Phlebotomy may also be done to remove extra red blood cells from the blood, to treat certain blood disorders. Also called blood draw and venipuncture.
  phlegm: (flem)
    Pronunciation of dictionary term "phlegm"
    A more than normal amount of thick mucus made by the cells lining the upper airways and lungs. A buildup of phlegm may be caused by infection, irritation, or chronic lung disease, and can cause discomfort in the chest and coughing.
  phobia: (FOH-bee-uh)
    Pronunciation of dictionary term "phobia"
    An extreme, irrational, fear of something that may cause a person to panic. Examples of common phobias include fear of spiders, flying in an airplane, elevators, heights, enclosed rooms, crowded public places, and embarrassing oneself in front of other people.
  phosphate: (FOS-fayt)
    Pronunciation of dictionary term "phosphate"
    A form of phosphoric acid, which contains phosphorus. In the body, phosphates are found in the bones and teeth. Phosphates may be used to treat a high level of calcium in the blood. Adding or removing phosphate chemical groups may affect the way proteins act in the body.
  phosphatidylinositol-3 kinase: (FOS-fuh-TY-duh-lih-NOH-sih-TOL-3 KY-nays)
    Pronunciation of dictionary term "phosphatidylinositol-3 kinase"
    A type of enzyme that transmits signals in cells and that helps control cell growth. Some tumors have higher-than-normal levels of phosphatidylinositol-3 kinase. Also called PI3 kinase and PI3K.
  phospholipid: (FOS-foh-LIH-pid)
    Pronunciation of dictionary term "phospholipid"
    A lipid (fat) that contains phosphorus. Phospholipids are a major part of cell membranes.
  phospholipid complex: (FOS-foh-LIH-pid KOM-plex)
    Pronunciation of dictionary term "phospholipid complex"
    A chemical or drug that is attached to a lipid (fat) that contains phosphorus.
  phosphonoformate trisodium: (FOS-foh-noh-FOR-mayt try-SOH-dee-um)
    Pronunciation of dictionary term "phosphonoformate trisodium"
    A drug used to treat infections with herpesviruses in people whose immune systems are weakened by AIDS. It blocks the viruses from making copies of themselves. It is a type of antiviral agent. Also called foscarnet sodium and Foscavir.
  phosphoric: (fos-FOR-ik)
    Pronunciation of dictionary term "phosphoric"
    Having to do with or containing the element phosphorus.
  phosphoric acid: (fos-FOR-ik A-sid)
    Pronunciation of dictionary term "phosphoric acid"
    An acid that contains phosphorus and is used in medicine and dentistry. It is also used to remove rust. A dilute form of phosphoric acid is used to flavor soft drinks.
  phosphorus: (FOS-for-us)
    Pronunciation of dictionary term "phosphorus"
    A nonmetallic element that is found in the blood, muscles, nerves, bones, and teeth and is a component of adenosine triphosphate (ATP; the primary energy source for the body's cells).
  phosphorus P 32: (FOS-for-us ...)
    Pronunciation of dictionary term "phosphorus P 32"
    A radioactive form of the element phosphorus. It is used in the laboratory to label DNA and proteins. It has also been used to treat a blood disorder called polycythemia vera and certain types of leukemia, but it is not commonly used anymore. Phosphorus P 32 gives off radiation that damages the DNA in a cell, which can cause the cell to die.
  phosphorylation: (fos-FOR-ih-LAY-shun)
    Pronunciation of dictionary term "phosphorylation"
    A process in which a phosphate group is added to a molecule, such as a sugar or a protein.
  photoactivity: (FOH-toh-ak-TIH-vih-tee)
    Pronunciation of dictionary term "photoactivity"
    The effect produced when certain substances are exposed to light. In cancer treatment, some drugs become active when exposed to light and are then able to kill tumor cells.
  photocoagulation: (FOH-toh-koh-A-gyuh-LAY-shun)
    Pronunciation of dictionary term "photocoagulation"
    The use of an intense beam of light, such as a laser, to seal off blood vessels or destroy tissue. It is used to treat certain eye conditions, and may be used to destroy blood vessels that a tumor needs to grow.
  photodynamic therapy: (FOH-toh-dy-NA-mik THAYR-uh-pee)
    Pronunciation of dictionary term "photodynamic therapy"
    Treatment with drugs that become active when exposed to light. These activated drugs may kill cancer cells.
    More Information
    - Photodynamic Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/photodynamic-fact-sheet)
  Photofrin: (FOH-toh-frin)
    Pronunciation of dictionary term "Photofrin"
    A drug used to treat some types of cancer. When absorbed by cancer cells and exposed to light, Photofrin becomes active and kills the cancer cells. It is a type of photodynamic therapy agent. Also called porfimer sodium.
  photon beam radiation therapy: (FOH-ton beem RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "photon beam radiation therapy"
    A type of radiation therapy that uses x-rays or gamma rays that come from a special machine called a linear accelerator (linac). The radiation dose is delivered at the surface of the body and goes into the tumor and through the body. Photon beam radiation therapy is different from proton beam therapy.
  photopheresis: (FOH-toh-feh-REE-sis)
    Pronunciation of dictionary term "photopheresis"
    A procedure in which blood is removed from the body and treated with ultraviolet light and drugs that become active when exposed to light. The blood is then returned to the body. It is being studied in the treatment of some blood and bone marrow diseases and graft-vs-host disease (GVHD). Also called extracorporeal photopheresis.
  photophobia: (FOH-toh-FOH-bee-uh)
    Pronunciation of dictionary term "photophobia"
    A condition in which the eyes are more sensitive than normal to light.
  photosensitivity: (FOH-toh-SEN-sih-TIH-vih-tee)
    Pronunciation of dictionary term "photosensitivity"
    A condition in which the skin becomes very sensitive to sunlight or other forms of ultraviolet light and may burn easily. Photosensitivity usually causes a rash or sunburn, especially on areas of the skin that are exposed to ultraviolet light. The affected areas may be painful and may itch, blister, or peel. Photosensitivity may be caused by certain medicines, such as antibiotics and anticancer drugs, radiation therapy, exposure to certain chemicals, and some medical conditions, such as lupus and xeroderma pigmentosum.
  photosensitizer: (FOH-toh-SEN-sih-ty-zer)
    Pronunciation of dictionary term "photosensitizer"
    A drug used in photodynamic therapy. When absorbed by cancer cells and exposed to light, the drug becomes active and kills the cancer cells. Also called photosensitizing agent.
  photosensitizing agent: (FOH-toh-SEN-sih-ty-zing AY-jent)
    Pronunciation of dictionary term "photosensitizing agent"
    A drug used in photodynamic therapy. When absorbed by cancer cells and exposed to light, the drug becomes active and kills the cancer cells. Also called photosensitizer.
  photosynthesis: (FOH-toh-SIN-theh-sis)
    Pronunciation of dictionary term "photosynthesis"
    A chemical process that occurs in plants, algae, and some types of bacteria, when they are exposed to sunlight. During photosynthesis, water and carbon dioxide combine to form carbohydrates (sugars) and give off oxygen. Photosynthesis is needed for animal and plant life.
  phototesting: (FOH-toh-TES-ting)
    Pronunciation of dictionary term "phototesting"
    Special tests used to measure the reaction of the skin to ultraviolet radiation. Phototesting is being used to see if drugs taken by mouth to treat cancer make the skin more sensitive to ultraviolet radiation.
  phototherapy: (FOH-toh-THAYR-uh-pee)
    Pronunciation of dictionary term "phototherapy"
    The treatment of disease with certain types of light. Phototherapy can use lasers, LED, fluorescent lamps, and ultraviolet or infrared radiation. Also called light therapy.
  phototoxicity: (FOH-toh-tok-SIH-sih-tee)
    Pronunciation of dictionary term "phototoxicity"
    A condition in which the skin or eyes become very sensitive to sunlight or other forms of light. It can be caused by taking certain drugs, or rubbing certain essential oils (scented liquid taken from plants) or other topical agents into the skin. Phototoxicity causes sunburn, blisters, and other skin problems.
  PHP: A rare condition in which the pituitary gland stops making most or all hormones. Pituitary hormones help control the way many parts of the body work. Symptoms of the condition depend on the hormones that are missing. They include growth problems (in children), obesity (in adults), hair loss, slow heart rate, low blood sugar, low blood pressure, fatigue, and problems with reproduction. This condition may be caused by a tumor on or near the pituitary gland, infection, stroke, injury, surgery, or radiation therapy. It may also be inherited. Also called panhypopituitarism.
  PHR: A collection of information about a person’s health that allows the person to manage and track his or her own health information. A PHR may include information about allergies, illnesses, surgeries, immunizations, and results of physical exams, tests, and screenings. It may also include information about medicines taken and health habits, such as diet and exercise. Also called personal health record, personal history, and personal medical history.
  phrenic nerve: (FREH-nik nerv)
    Pronunciation of dictionary term "phrenic nerve"
    A nerve that runs from the spinal cord to the diaphragm (the thin muscle below the lungs and heart that separates the chest from the abdomen). It causes the diaphragm to contract and relax, which helps control breathing.
  PHTS: A group of inherited disorders caused by mutations (changes) in the PTEN gene. In people with PHTS, many benign (not cancer) growths called hamartomas form in different parts of the body, especially the skin, mouth, and gastrointestinal tract. Benign tumors may also occur in the thyroid, breast, uterus, soft tissue, and brain. Other signs and symptoms include a larger-than-average head, abnormal skin changes, blood vessel problems, autism spectrum disorder, and learning and developmental delays. People with PHTS have an increased risk of developing certain types of cancer, including melanoma and cancers of the breast, thyroid, kidney, endometrium, colon, and rectum. Also called PTEN hamartoma tumor syndrome.
    More Information
    - PTEN hamartoma tumor syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/12800/pten-hamartoma-tumor-syndrome)
  phyllodes tumor: (fih-LOH-deez TOO-mer)
    Pronunciation of dictionary term "phyllodes tumor"
    A rare tumor that usually forms in the connective tissue of the breast. Phyllodes tumors tend to grow quickly and get large, but they rarely spread to other parts of the body. Most are benign (not cancer), but some may be malignant (cancer) or borderline (in between benign and malignant). Phyllodes tumors are usually removed by surgery, but they can come back. They are most common in women between 40 and 50 years of age. Also called CSP and cystosarcoma phyllodes of the breast.
  physiatrist: (fih-ZY-uh-trist)
    Pronunciation of dictionary term "physiatrist"
    A doctor who has special training in physical medicine. Physical medicine is the prevention and treatment of disease or injury with physical methods, such as exercise and machines. Also called physical medicine specialist.
  physical dependence: (FIH-zih-kul dee-PEN-dents)
    Pronunciation of dictionary term "physical dependence"
    A condition in which a person takes a drug over time, and unpleasant physical symptoms occur if the drug is suddenly stopped or taken in smaller doses.
  physical examination: (FIH-zih-kul eg-ZA-mih-NAY-shun)
    Pronunciation of dictionary term "physical examination"
    An exam of the body to check for general signs of disease.
  physical medicine specialist: (FIH-zih-kul MEH-dih-sin SPEH-shuh-list)
    Pronunciation of dictionary term "physical medicine specialist"
    A doctor who has special training in physical medicine. Physical medicine is the prevention and treatment of disease or injury with physical methods, such as exercise and machines. Also called physiatrist.
  physical therapist: (FIH-zih-kul THAYR-uh-pist)
    Pronunciation of dictionary term "physical therapist"
    A health professional trained to evaluate and treat people who have conditions or injuries that limit their ability to move and do physical activities. Physical therapists use methods such as exercise, massage, hot packs, ice, and electrical stimulation to help strengthen muscles, relieve pain, and improve movement. They also teach exercises to help prevent injury and loss of motion.
  physical therapy: (FIH-zih-kul THAYR-uh-pee)
    Pronunciation of dictionary term "physical therapy"
    The use of exercises and physical activities to help condition muscles and restore strength and movement. For example, physical therapy can be used to restore arm and shoulder movement and build back strength after breast cancer surgery.
  physical touch methods: (FIH-zih-kul tuch MEH-thuds)
    Pronunciation of dictionary term "physical touch methods"
    A type of therapy in which the therapist moves or manipulates one or more parts of the patient’s body. It may be used to treat pain, stress, anxiety, and depression, and for general well-being. Examples include chiropractic treatments, physical therapy, and massage therapy. Also called manipulative and body-based practice and manual healing.
  physician: (fih-ZIH-shun)
    Pronunciation of dictionary term "physician"
    A person who is trained and licensed to practice medicine. Physicians help prevent, diagnose, treat, and manage injuries, diseases, and other conditions. There are many different types of physicians, including internists, pediatricians, psychiatrists, and surgeons.
  physician assistant: (fih-ZIH-shun uh-SIS-tunt)
    Pronunciation of dictionary term "physician assistant"
    A health professional who is licensed to do certain medical procedures under the guidance of a doctor. A physician assistant may take medical histories, do physical exams, take blood and urine samples, care for wounds, and give injections and immunizations. Also called PA.
  Physician Data Query: (fih-ZIH-shun DAY-tuh KWEER-ee)
    Pronunciation of dictionary term "Physician Data Query"
    Physician Data Query is an online source of cancer information that is developed and maintained by the National Cancer Institute (NCI). It makes current, credible, and accurate cancer information available to health professionals and the public. Physician Data Query contains information about cancer treatment, supportive and palliative care, screening, prevention, genetics, and integrative, complementary, and alternative medicine. This information is updated with the most recent evidence from scientific research. Physician Data Query also contains drug information summaries on many cancer-related drugs and dictionaries of cancer terms, drug terms, and genetics terms. Most of this information and more specific information about Physician Data Query can be found on the NCI's website at http://www.cancer.gov/publications/pdq. Also called PDQ.
    More Information
    - PDQ® - NCI's Comprehensive Database (https://www.cancer.gov/publications/pdq)
  physiologic: (FIH-zee-uh-LAH-jik)
    Pronunciation of dictionary term "physiologic"
    Having to do with the functions of the body. When used in the phrase "physiologic age," it refers to an age assigned by general health, as opposed to calendar age.
  phytic acid: (FY-tik A-sid)
    Pronunciation of dictionary term "phytic acid"
    A substance found in many foods that come from plants, including corn, wheat, rice, and soybeans, and in large amounts in cereals and legumes. It is being studied in the prevention of cancer. Also called inositol hexaphosphate and IP6.
  phytochemical: (FY-toh-KEH-mih-kul)
    Pronunciation of dictionary term "phytochemical"
    A substance found in plants. Some phytochemicals may reduce the risk of cancer.
  phytoestrogen: (FY-toh-ES-truh-jin)
    Pronunciation of dictionary term "phytoestrogen"
    An estrogen-like substance found in some plants and plant products. Phytoestrogens may have anticancer effects.
  phytohemagglutinin: (FY-toh-HEE-muh-GLOO-tih-nin)
    Pronunciation of dictionary term "phytohemagglutinin"
    A substance found in plants that causes red blood cells to clump together and certain white blood cells to divide.
  phytol: (FY-tol)
    Pronunciation of dictionary term "phytol"
    A chemical substance that comes from plants and is used to make vitamins E and K. Phytol is also found in soaps, beauty care products, and household products.
  phytosterol: (FY-toh-STEER-ol)
    Pronunciation of dictionary term "phytosterol"
    A plant-based compound that can compete with dietary cholesterol to be absorbed by the intestines, resulting in lower blood cholesterol levels. Phytosterols may have some effect in cancer prevention. Also called plant sterol.
  PI: The person(s) in charge of a clinical trial or a scientific research grant. The PI prepares and carries out the clinical trial protocol (plan for the study) or research paid for by the grant. The PI also analyzes the data and reports the results of the trial or grant research. Also called principal investigator.
  PI-88: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called antiangiogenesis agents.
  PI3 kinase: (... KY-nays)
    Pronunciation of dictionary term "PI3 kinase"
    A type of enzyme that transmits signals in cells and that helps control cell growth. Some tumors have higher-than-normal levels of PI3 kinase. Also called phosphatidylinositol-3 kinase and PI3K.
  PI3K: A type of enzyme that transmits signals in cells and that helps control cell growth. Some tumors have higher-than-normal levels of PI3K. Also called phosphatidylinositol-3 kinase and PI3 kinase.
  Picato: (pih-KAY-toh)
    Pronunciation of dictionary term "Picato"
    A drug applied to the skin to treat actinic keratosis (thick, scaly growths on the skin that may become cancer). Picato may help kill abnormal cells. It is a type of cytotoxic agent. Also called ingenol mebutate gel.
  PICC: A device used to draw blood and give treatments, including intravenous fluids, drugs, or blood transfusions. A thin, flexible tube is inserted into a vein in the upper arm and guided (threaded) into a large vein above the right side of the heart called the superior vena cava. A needle is inserted into a port outside the body to draw blood or give fluids. A PICC may stay in place for weeks or months and helps avoid the need for repeated needle sticks. Also called peripherally inserted central catheter.
    Peripherally inserted central catheter (PICC). A PICC is a thin, flexible tube that is inserted into a vein in the upper arm and guided (threaded) into a large vein above the right side of the heart called the superior vena cava. It is used to give intravenous fluids, blood transfusions, chemotherapy, and other drugs. It is also used for taking blood samples. A PICC line may stay in place for weeks or months and helps avoid the need for repeated needle sticks.
    Peripherally inserted central catheter (PICC); drawing of a PICC line that goes from a vein in the upper right arm to a large vein above the right side of the heart called the superior vena cava. An inset shows a PICC line in the arm with a clear plastic dressing over it. An intravenous line attached to the PICC is also shown.
  PID: A condition in which the female reproductive organs are inflamed. It may affect the uterus, fallopian tubes, ovaries, and certain ligaments. PID is usually caused by a bacterial infection. It may cause infertility and an increased risk of an ectopic pregnancy (pregnancy in the fallopian tubes). Also called pelvic inflammatory disease.
  pigment: (PIG-ment)
    Pronunciation of dictionary term "pigment"
    A substance that gives color to tissue. Pigments are responsible for the color of skin, eyes, and hair.
  PIK3CA gene: (… jeen)
    Pronunciation of dictionary term "PIK3CA gene"
    A gene that makes one of the proteins in an enzyme called PI3K, which is involved in many important functions in a cell. Mutations (changes) in the PIK3CA gene may cause the PI3K enzyme to become overactive, which may cause cancer cells to grow. PIK3CA gene mutations have been found in many types of cancer, including cancers of the breast, lung, ovary, stomach, brain, colon, and rectum. They have also been found in some genetic conditions.
  pilocarpine: (PY-loh-KAR-peen)
    Pronunciation of dictionary term "pilocarpine"
    A drug used to increase salivation in people who have dry mouth caused by opioids or radiation therapy. Pilocarpine belongs to the family of drugs called alkaloids.
  pilocytic: (PY-loh-SIH-tik)
    Pronunciation of dictionary term "pilocytic"
    Made up of cells that look like fibers when viewed under a microscope.
  pilot study: (PY-lut STUH-dee)
    Pronunciation of dictionary term "pilot study"
    The initial study examining a new method or treatment.
  PIN: Noncancerous growth of cells lining the internal and external surfaces of the prostate gland. Having high-grade PIN may increase the risk of developing prostate cancer. Also called prostatic intraepithelial neoplasia.
  pineal body: (PIH-nee-ul BAH-dee)
    Pronunciation of dictionary term "pineal body"
    A tiny organ in the cerebrum that produces melatonin. Also called pineal gland and pineal organ.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  pineal germinoma: (PIH-nee-ul JER-mih-NOH-muh)
    Pronunciation of dictionary term "pineal germinoma"
    A type of germ cell tumor that is found in the pineal gland in the brain. Symptoms of pineal germinomas include headaches, changes in vision, nausea, and vomiting.
  pineal gland: (PIH-nee-ul ...)
    Pronunciation of dictionary term "pineal gland"
    A tiny organ in the cerebrum that produces melatonin. Also called pineal body and pineal organ.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  pineal organ: (PIH-nee-ul OR-gun)
    Pronunciation of dictionary term "pineal organ"
    A tiny organ in the cerebrum that produces melatonin. Also called pineal body and pineal gland.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  pineal region tumor: (PIH-nee-ul REE-jun TOO-mer)
    Pronunciation of dictionary term "pineal region tumor"
    A type of brain tumor that forms in or around the pineal gland (a tiny organ near the center of the brain). Pineal region tumors may be benign (not cancer) or malignant (cancer). They include pineocytomas, pineoblastomas, and pineal germinomas. Also called pinealoma.
  pinealoma: (PIH-nee-uh-LOH-muh)
    Pronunciation of dictionary term "pinealoma"
    A type of brain tumor that forms in or around the pineal gland (a tiny organ near the center of the brain). Pinealomas may be benign (not cancer) or malignant (cancer). They include pineocytomas, pineoblastomas, and pineal germinomas. Also called pineal region tumor.
  pineoblastoma: (PIH-nee-oh-blas-TOH-muh)
    Pronunciation of dictionary term "pineoblastoma"
    A fast growing type of brain tumor that occurs in or around the pineal gland, a tiny organ near the center of the brain.
  pineocytoma: (PIH-nee-oh-sy-TOH-muh)
    Pronunciation of dictionary term "pineocytoma"
    A slow growing type of brain tumor that occurs in or around the pineal gland, a tiny organ near the center of the brain.
  pinkeye: (PINK-i)
    Pronunciation of dictionary term "pinkeye"
    A condition in which the conjunctiva (membranes lining the eyelids and covering the white part of the eye) become inflamed or infected. Also called conjunctivitis.
  pioglitazone: (py-oh-GLIH-tuh-zone)
    Pronunciation of dictionary term "pioglitazone"
    A drug that is used to treat type 2 diabetes and is being studied in the prevention of head and neck cancer. It may be able to stop leukoplakia (a condition affecting the mouth ) from developing into cancer. It is a type of thiazolidinedione. Also called Actos.
  pipe: As it relates to tobacco use, a device that has a mouthpiece at one end of a tube and a small bowl at the other end that is filled with tobacco, which is lit and smoked. The smoke from a pipe is usually not inhaled into the lungs. It contains nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Pipe smoking can lead to nicotine addiction and can cause cancers of the mouth, larynx (voice box), esophagus, lung, pancreas, and bladder. It can also cause heart disease, lung disease, and other health problems.
  piperacillin-tazobactam: (py-PER-uh-SIH-lin-TA-zoh-BAK-tam)
    Pronunciation of dictionary term "piperacillin-tazobactam"
    A drug combination that is used to treat infection in people with cancer. Piperacillin is a synthetic penicillin; tazobactam enhances the effectiveness of piperacillin.
  Piqray: (PIK-ray)
    Pronunciation of dictionary term "Piqray"
    A drug used with fulvestrant to treat postmenopausal women, and men, with hormone-receptor positive, HER2-negative breast cancer that is advanced or has spread and has a mutation (change) in the PIK3CA gene. It is used in patients whose cancer got worse during or after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. Piqray blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called alpelisib.
    More Information
    - Alpelisib (https://www.cancer.gov/about-cancer/treatment/drugs/alpelisib)
  pirfenidone: (peer-FEH-nih-done)
    Pronunciation of dictionary term "pirfenidone"
    A substance that is being studied in the prevention and treatment of scar tissue caused by radiation therapy. It belongs to the family of drugs called anti-inflammatory agents.
  Piritrexim: (peer-ee-TREK-sim)
    Pronunciation of dictionary term "Piritrexim"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called folate antagonists.
  pirtobrutinib: (PEER-toh-BROO-tih-nib)
    Pronunciation of dictionary term "pirtobrutinib"
    A drug used to treat adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, or mantle cell lymphoma that was treated with at least two other types of therapy, including a BTK inhibitor. It is also being studied in the treatment of other types of cancer. Pirtobrutinib blocks a protein called BTK, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Jaypirca.
    More Information
    - Pirtobrutinib (https://www.cancer.gov/about-cancer/treatment/drugs/pirtobrutinib)
  pituitary gland: (pih-TOO-ih-TAYR-ee...)
    Pronunciation of dictionary term "pituitary gland"
    A pea-sized organ attached to the part of the brain called the hypothalamus. It lies at the base of the brain above the back of the nose. The hypothalamus sends signals to the pituitary gland, which then makes hormones that control other glands and many of the body’s functions, including growth and fertility.
    More Information
    - Pituitary Tumor (https://www.cancer.gov/types/pituitary)
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  pituitary tumor: (pih-TOO-ih-TAYR-ee TOO-mer)
    Pronunciation of dictionary term "pituitary tumor"
    A tumor that forms in the pituitary gland. The pituitary gland is a pea-sized organ at the base of the brain. It makes hormones that affect other glands and many of the body’s functions, including growth. Symptoms depend on the hormones affected by the tumor. Most pituitary tumors are benign (not cancer) and many do not cause any symptoms.
    More Information
    - Pituitary Tumors (https://www.cancer.gov/types/pituitary)
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  pixantrone: (PIK-san-trone)
    Pronunciation of dictionary term "pixantrone"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called antitumor antibiotics. Also called BBR 2778.
  PJS: A rare genetic disorder in which many polyps (abnormal growths of tissue) form in the lining of the gastrointestinal tract, and dark-colored spots appear on certain areas of the skin, such as around the mouth, eyes, and nose. People with PJS have a very high risk of developing gastrointestinal cancer and other types of cancer, including cancers of the breast, pancreas, ovary, lung, and cervix. PJS is usually caused by mutations (changes) in the STK11 gene. Some people with PJS do not have a mutation in the STK11 gene. In these cases, the cause of the disorder is unknown. Also called Peutz-Jeghers syndrome.
    More Information
    - Peutz-Jeghers syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7378/peutz-jeghers-syndrome)
    - Peutz-Jeghers syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/peutz-jeghers-syndrome/)
  PKC: An enzyme found throughout the body's tissues and organs. Several forms of PKC are involved in many cellular functions. PKC is being studied in the treatment of cancer. Also called protein kinase C.
  PKC412: A drug used alone or with other anticancer drugs to treat adults with certain types of acute myeloid leukemia, mast cell leukemia, or systemic mastocytosis. It is also being studied in the treatment of other types of cancer. PKC412 blocks certain proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. PKC412 is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called midostaurin, N-benzoyl-staurosporine, and Rydapt.
    More Information
    - Midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin)
  PKU: An inherited disorder that causes a build-up of a substance called phenylalanine in the blood and other body fluids. Phenylalanine is an amino acid (a building block of proteins), so certain foods, such as meat, eggs, nuts, and milk, contain high levels. Some artificial sweeteners, such as aspartame, also contain high levels of phenylalanine. The signs and symptoms of PKU can be mild or severe and may include light skin and hair, skin rashes, seizures, developmental delays, and movement, behavioral, and mental or psychological problems. The breath, skin, or urine may also have a musty odor. If not treated, PKU can lead to permanent intellectual disability. All babies born in the United States and many other countries are screened for PKU using a simple blood test. There is no cure, but PKU can be managed with a diet low in phenylalanine. Also called phenylketonuria.
    More Information
    - Phenylketonuria (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7383/phenylketonuria)
    - Phenylketonuria (MedlinePlus) (https://medlineplus.gov/genetics/condition/phenylketonuria/)
  placebo: (pluh-SEE-boh)
    Pronunciation of dictionary term "placebo"
    An inactive substance or other intervention that looks the same as, and is given the same way as, an active drug or treatment being tested. The effects of the active drug or other intervention are compared to the effects of the placebo.
  placebo therapy: (pluh-SEE-boh THAYR-uh-pee)
    Pronunciation of dictionary term "placebo therapy"
    An inactive treatment that is designed to mimic as closely as possible the active treatment being studied in a clinical trial. For example, a placebo pill made of an inactive substance is given instead of the pill with the active drug.
  placebo-controlled: (pluh-SEE-boh-kun-TROLD)
    Pronunciation of dictionary term "placebo-controlled"
    Refers to a clinical study in which the control patients receive a placebo.
  placenta: (pluh-SEN-tuh)
    Pronunciation of dictionary term "placenta"
    The organ that nourishes the developing fetus in the uterus.
  placental blood transplantation: (pluh-SEN-tul blud tranz-plan-TAY-shun)
    Pronunciation of dictionary term "placental blood transplantation"
    The transfer of blood from a placenta to an individual whose own blood production system is suppressed. Placental blood contains high levels of stem cells needed to produce new blood cells. It is being studied in the treatment of cancer and severe blood disorders such as aplastic anemia.
  Plan B: (plan …)
    Pronunciation of dictionary term "Plan B"
    A form of the hormone progesterone that is made in the laboratory and used to prevent pregnancy. It is being studied in the prevention of ovarian and endometrial cancer, and in the treatment of other conditions. Plan B is a type of oral contraceptive. Also called L-norgestrel and levonorgestrel.
  plant sterol: (... STEER-ol)
    Pronunciation of dictionary term "plant sterol"
    A plant-based compound that can compete with dietary cholesterol to be absorbed by the intestines, resulting in lower blood cholesterol levels. Plant sterols may have some effect in cancer prevention. Also called phytosterol.
  plantar pit: (PLAN-ter ...)
    Pronunciation of dictionary term "plantar pit"
    A tiny dent in the skin on the bottom (sole) of the foot. Plantar pits are usually pink or skin-colored and can often be seen more easily after soaking the feet in water. They are often found in people with a rare, inherited condition called basal cell nevus syndrome (BCNS). People with BCNS have a very high risk of developing basal cell skin cancer and are also at risk of developing other types of cancer, including medulloblastoma.
    Palmar pits are small depressions in the skin on the palm of the hand that may be seen in individuals with basal cell nevus syndrome, a hereditary syndrome associated with the development of basal cell carcinoma. Depressions may also be seen on the sole of the foot (plantar pits, not shown).
    Photograph showing three small, flesh-colored depressions on the palm of the hand.
    Palmar pits are small depressions in the skin on the palm of the hand that may be seen in individuals with basal cell nevus syndrome, a hereditary syndrome associated with the development of basal cell carcinoma. Depressions may also be seen on the sole of the foot (plantar pits, not shown).
    Photograph showing three small, flesh-colored depressions on the palm of the hand.
  plaque: (plak)
    Pronunciation of dictionary term "plaque"
    In medicine, a small, abnormal patch of tissue on a body part or an organ. Plaques may also be a build-up of substances from a fluid, such as cholesterol in the blood vessels.
  plaque radiotherapy: (plak RAY-dee-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "plaque radiotherapy"
    A type of radiation therapy used to treat eye tumors. A thin piece of metal (usually gold) with radioactive seeds placed on one side is sewn onto the outside wall of the eye with the seeds aimed at the tumor. It is removed at the end of treatment, which usually lasts for several days.
    Plaque radiotherapy is a type of radiation therapy used to treat eye cancer. Radioactive seeds are attached to one side of a thin piece of metal (usually gold) called a plaque. The plaque is sewn onto the outside wall of the eye near the tumor. The seeds give off radiation which kills the cancer. The plaque is removed at the end of treatment, which usually lasts for several days.
    Drawing of a cross-section of the eye showing the sclera, choroid, retina, and optic nerve. An inset shows a plaque with radioactive seeds that is placed on the outside of the eye. The seeds are aimed at the cancer.
  plasma: (PLAZ-muh)
    Pronunciation of dictionary term "plasma"
    The clear, yellowish, fluid part of the blood that carries the blood cells. The proteins that form blood clots are in plasma.
  plasma cell: (PLAZ-muh sel)
    Pronunciation of dictionary term "plasma cell"
    A type of immune cell that makes large amounts of a specific antibody. Plasma cells develop from B cells that have been activated. A plasma cell is a type of white blood cell. Also called plasmacyte.
    More Information
    - Multiple Myeloma/Other Plasma Cell Neoplasms (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
  plasma cell myeloma: (PLAZ-muh sel MY-eh-LOH-muh)
    Pronunciation of dictionary term "plasma cell myeloma"
    A type of cancer that begins in plasma cells (white blood cells that produce antibodies). Also called Kahler disease, multiple myeloma, and myelomatosis.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
    Multiple myeloma. Multiple myeloma cells are abnormal plasma cells (a type of white blood cell) that build up in the bone marrow and form tumors in many bones of the body. Normal plasma cells make antibodies to help the body fight infection and disease. As the number of multiple myeloma cells increases, more antibodies are made. This can cause the blood to thicken and keep the bone marrow from making enough healthy blood cells. Multiple myeloma cells also damage and weaken the bone.
    Multiple myeloma; drawing shows normal plasma cells, multiple myeloma cells (abnormal plasma cells), and antibodies. Also shown is red marrow inside bone, where plasma cells are made.
  plasma cell neoplasm: (PLAZ-muh sel NEE-oh-PLA-zum)
    Pronunciation of dictionary term "plasma cell neoplasm"
    A type of tumor that begins in plasma cells (white blood cells that make antibodies). Multiple myeloma, monoclonal gammopathy of undetermined significance (MGUS), and plasmacytoma are types of plasma cell neoplasms. Also called plasma cell tumor.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
  plasma cell tumor: (PLAZ-muh sel TOO-mer)
    Pronunciation of dictionary term "plasma cell tumor"
    A type of tumor that begins in plasma cells (white blood cells that make antibodies). Multiple myeloma, monoclonal gammopathy of undetermined significance (MGUS), and plasmacytoma are types of plasma cell tumors. Also called plasma cell neoplasm.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
  plasma exchange: (PLAZ-muh EX-chaynj)
    Pronunciation of dictionary term "plasma exchange"
    A procedure in which a machine is used to separate the plasma (the liquid part of the blood) from the blood cells. After the plasma is separated from the blood cells, the blood cells are mixed with a liquid to replace the plasma and are returned to the body. Plasma exchange is often done to remove extra antibodies, abnormal proteins, or other harmful substances from the blood. It may be used to treat certain types of blood disorders, autoimmune disorders, nervous system disorders, or other conditions. Also called plasmapheresis.
  plasma membrane: (PLAZ-muh MEM-brayn)
    Pronunciation of dictionary term "plasma membrane"
    The outer membrane of a cell.
  plasmablastic lymphoma: (PLAZ-muh-BLAS-tik lim-FOH-muh)
    Pronunciation of dictionary term "plasmablastic lymphoma"
    A very aggressive (fast-growing) type of large B-cell non-Hodgkin lymphoma (cancer that begins in the cells of the immune system). It is most common in patients with HIV infection, but may also occur in patients whose immune system is suppressed for other reasons.
  plasmacyte: (PLAZ-muh-site)
    Pronunciation of dictionary term "plasmacyte"
    A type of immune cell that makes large amounts of a specific antibody. Plasmacytes develop from B cells that have been activated. A plasmacyte is a type of white blood cell. Also called plasma cell.
    More Information
    - Multiple Myeloma/Other Plasma Cell Neoplasms (https://www.cancer.gov/types/myeloma)
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
  plasmacytic: (PLAZ-muh-SIH-tik)
    Pronunciation of dictionary term "plasmacytic"
    Having to do with plasma cells (a type of white blood cells).
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
  plasmacytoma: (PLAZ-muh-sy-TOH-muh)
    Pronunciation of dictionary term "plasmacytoma"
    A type of cancer that begins in plasma cells (white blood cells that produce antibodies). A plasmacytoma may turn into multiple myeloma.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B lymphocyte, T lymphocyte, or natural killer cell. A B lymphocyte may become a plasma cell.
  plasmapheresis: (PLAZ-muh-feh-REE-sis)
    Pronunciation of dictionary term "plasmapheresis"
    A procedure in which a machine is used to separate the plasma (the liquid part of the blood) from the blood cells. After the plasma is separated from the blood cells, the blood cells are mixed with a liquid to replace the plasma and are returned to the body. Plasmapheresis is often done to remove extra antibodies, abnormal proteins, or other harmful substances from the blood. It may be used to treat certain types of blood disorders, autoimmune disorders, nervous system disorders, or other conditions. Also called plasma exchange.
  plastic surgeon: (PLAS-tik SER-jun)
    Pronunciation of dictionary term "plastic surgeon"
    A surgeon who has special training in reducing scarring or disfigurement that may occur as a result of accidents, birth defects, or treatment for diseases.
  plastic surgery: (PLAS-tik SER-juh-ree)
    Pronunciation of dictionary term "plastic surgery"
    An operation that restores or improves the appearance of body structures.
  platelet: (PLAYT-let)
    Pronunciation of dictionary term "platelet"
    A tiny, disc-shaped piece of cell that is found in the blood and spleen. Platelets are pieces of very large cells in the bone marrow called megakaryocytes. They help form blood clots to slow or stop bleeding and to help wounds heal. Having too many or too few platelets or having platelets that don’t work as they should can cause problems. Checking the number of platelets in the blood may help diagnose certain diseases or conditions. Also called thrombocyte.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  platelet-derived growth factor: (PLAYT-let-deh-RIVED grothe FAK-ter)
    Pronunciation of dictionary term "platelet-derived growth factor"
    A family of molecules released from platelets (tiny pieces of cells that are found in the blood and that help the blood clot). Forms of platelet-derived growth factor help to heal wounds and to repair damage to blood vessel walls. They also help blood vessels grow. Also called PDGF.
  platelet-derived growth factor receptor alpha gene: (PLAYT-let-deh-RIVED grothe FAK-ter reh-SEP-ter AL-fuh jeen)
    Pronunciation of dictionary term "platelet-derived growth factor receptor alpha gene"
    A gene that makes a protein that is involved in cell division and cell survival. Mutated (changed) forms of the platelet-derived growth factor receptor alpha gene and protein have been found in some types of cancer, including gastrointestinal stromal tumors and chronic eosinophilic leukemia. These changes may increase the growth of cancer cells. Checking for changes in the platelet-derived growth factor receptor alpha gene in tumor tissue may help diagnose some types of cancer and plan treatment. Also called PDGFRA gene.
  Platinol: (PLA-tih-nol)
    Pronunciation of dictionary term "Platinol"
    A drug that contains the active ingredient cisplatin, which is used to treat certain types of bladder cancer, ovarian cancer, and testicular cancer. Platinol brand has been taken off the market and is no longer available.
  Platinol-AQ: (PLA-tih-nol...)
    Pronunciation of dictionary term "Platinol-AQ"
    A drug used to treat cancers of the bladder, ovaries, and testicles. It is used in patients whose cancer cannot be treated with or has not gotten better with other anticancer treatment. It is also being studied in the treatment of other types of cancer. Platinol-AQ contains the metal platinum. It kills cancer cells by damaging their DNA and stopping them from dividing. It is a type of DNA crosslinking agent. Also called cisplatin and Platinol.
  platinum: (PLA-tih-num)
    Pronunciation of dictionary term "platinum"
    A metal that is an important component of some anticancer drugs, such as cisplatin and carboplatin.
  platinum refractory cancer: (PLA-tih-num reh-FRAK-tor-ee KAN-ser)
    Pronunciation of dictionary term "platinum refractory cancer"
    Cancer that does not respond to treatment with anticancer drugs that contain the metal platinum, such as cisplatin and carboplatin.
  platinum resistant cancer: (PLA-tih-num reh-ZIH-stunt KAN-ser)
    Pronunciation of dictionary term "platinum resistant cancer"
    Cancer that responds at first to treatment with drugs that contain the metal platinum, such as cisplatin and carboplatin, but then comes back within a certain period. For example, ovarian cancer that comes back within 6 months after treatment is considered platinum resistant. Knowing whether cancer is platinum resistant may help plan further treatment.
  platinum sensitive cancer: (PLA-tih-num SEN-sih-tiv KAN-ser)
    Pronunciation of dictionary term "platinum sensitive cancer"
    Cancer that responds to treatment with anticancer drugs that contain the metal platinum, such as cisplatin and carboplatin. Some cancers that respond to treatment but then come back after a certain period may also be considered platinum sensitive. For example, ovarian cancer that comes back 6 or more months after platinum-based treatment is considered platinum sensitive. Knowing whether cancer is platinum sensitive may help plan further treatment.
  PLCIS: A condition in which abnormal cells are found in the lobules (milk glands) of the breast. The cells tend to look larger and more abnormal under a microscope than cells from the more common classic lobular carcinoma in situ (LCIS). PLCIS is more likely to become invasive breast cancer and spread to other tissues in the breast than the more common form is. PLCIS usually occurs in postmenopausal women. Also called pleomorphic lobular carcinoma in situ.
  Plenaxis: (pleh-NAK-sis)
    Pronunciation of dictionary term "Plenaxis"
    A drug used to reduce the amount of testosterone made in patients with advanced symptomatic prostate cancer for which no other treatment options are available. It belongs to the family of drugs called gonadotropin-releasing hormone (GnRH) antagonists. Also called abarelix.
  pleomorphic: (PLEE-oh-MOR-fik)
    Pronunciation of dictionary term "pleomorphic"
    Occurring in various distinct forms. In terms of cells, having variation in the size and shape of cells or their nuclei.
  pleomorphic liposarcoma: (PLEE-oh-MOR-fik LIH-poh-sar-KOH-muh)
    Pronunciation of dictionary term "pleomorphic liposarcoma"
    A rare, fast-growing type of cancer that begins in fat cells. It usually forms in the deep soft tissues of the arms or legs, but it may also form in the abdomen or chest. Pleomorphic liposarcoma often recurs (comes back) after treatment and spreads to other parts of the body, including the lungs. It usually occurs in older adults, and is rare in children and adolescents. Pleomorphic liposarcoma is a type of soft tissue sarcoma.
  pleomorphic lobular carcinoma in situ: (PLEE-oh-MOR-fik LAH-byoo-ler KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "pleomorphic lobular carcinoma in situ"
    A condition in which abnormal cells are found in the lobules (milk glands) of the breast. The cells tend to look larger and more abnormal under a microscope than cells from the more common classic lobular carcinoma in situ (LCIS). Pleomorphic lobular carcinoma in situ is more likely to become invasive breast cancer and spread to other tissues in the breast than the more common form is. Pleomorphic lobular carcinoma in situ usually occurs in postmenopausal women. Also called PLCIS.
  plerixafor: (pleh-RIK-suh-for)
    Pronunciation of dictionary term "plerixafor"
    A drug used with granulocyte colony-stimulating factor before an autologous stem cell transplant in patients with non-Hodgkin lymphoma or multiple myeloma. It is also being studied in the treatment of other types of cancer. Plerixafor helps move stem cells from the bone marrow to the blood so they can be collected, stored, and then given back to the patient. Plerixafor is a type of hematopoietic stem cell mobilizer. Also called AMD 3100 and Mozobil.
    More Information
    - Plerixafor (https://www.cancer.gov/about-cancer/treatment/drugs/plerixafor)
  pleura: (PLOOR-uh)
    Pronunciation of dictionary term "pleura"
    A thin layer of tissue that covers the lungs and lines the interior wall of the chest cavity. It protects and cushions the lungs. This tissue secretes a small amount of fluid that acts as a lubricant, allowing the lungs to move smoothly in the chest cavity while breathing.
  pleural cavity: (PLOOR-ul KA-vuh-tee)
    Pronunciation of dictionary term "pleural cavity"
    The space enclosed by the pleura, which is a thin layer of tissue that covers the lungs and lines the interior wall of the chest cavity.
  pleural effusion: (PLOOR-ul eh-FYOO-zhun)
    Pronunciation of dictionary term "pleural effusion"
    An abnormal collection of fluid between the thin layers of tissue (pleura) lining the lung and the wall of the chest cavity.
    More Information
    - Cardiopulmonary Syndromes
  pleurectomy: (ploo-REK-toh-mee)
    Pronunciation of dictionary term "pleurectomy"
    Surgery to remove part of the pleura (a thin layer of tissue that covers the interior wall of the chest cavity).
  pleurodesis: (PLOOR-oh-DEE-sis)
    Pronunciation of dictionary term "pleurodesis"
    A medical procedure that uses chemicals or drugs to cause inflammation and adhesion between the layers of the pleura (a thin layer of tissue that covers the lungs and lines the interior wall of the chest cavity). This prevents the buildup of fluid in the pleural cavity. It is used as a treatment for severe pleural effusion.
  pleuropulmonary blastoma: (PLOOR-oh-PUL-muh-NAYR-ee blas-TOH-muh)
    Pronunciation of dictionary term "pleuropulmonary blastoma"
    A rare, fast-growing cancer that forms in the tissues of the lung and pleura (the thin layer of tissue that covers the lungs and lines the inside of the chest). It may also form in the organs between the lungs, including the heart, aorta, and pulmonary artery, or in the diaphragm. Pleuropulmonary blastoma may sometimes spread to other parts of the body, especially to the brain. It usually occurs in infants and young children. Some patients with pleuropulmonary blastoma have mutations (changes) in a gene called DICER1.
    Pleuropulmonary blastoma is a rare, fast-growing cancer that forms in the tissues of the lung and pleura (the thin layer of tissue that covers the lungs and lines the inside of the chest). It may also form in the organs between the lungs, including the heart, aorta, and pulmonary artery, or in the diaphragm (the main breathing muscle below the lungs). Pleuropulmonary blastoma usually occurs in infants and young children.
    Drawing showing areas where pleuropulmonary blastoma may form, including the aorta, pulmonary artery, lung, heart, pleura, and diaphragm. Also shown is cancer in the left lung.
  pleuropulmonary blastoma familial cancer syndrome: (PLOOR-oh-PUL-muh-NAYR-ee blas-TOH-muh fuh-MIH-lee-ul KAN-ser SIN-drome)
    Pronunciation of dictionary term "pleuropulmonary blastoma familial cancer syndrome"
    A rare, inherited disorder that increases the risk of pleuropulmonary blastoma (a rare, fast-growing cancer that forms in the tissues of the lung and chest cavity). Pleuropulmonary blastoma familial cancer syndrome may cause cysts in the kidney and lung, thyroid problems, and cancers of the ovary, testicle, kidney, and soft tissue. It may also cause other cancers and benign (not cancer) conditions. This syndrome may be caused by a mutation (change) in a gene called DICER1.
    More Information
    - DICER1-related pleuropulmonary blastoma cancer predisposition syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10734/dicer1-related-pleuropulmonary-blastoma-cancer-predisposition-syndrome)
    - DICER1 syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/dicer1-syndrome/)
  plexiform fibrohistiocytic tumor: (PLEK-sih-form FY-broh-HIS-tee-oh-SIH-tik TOO-mer)
    Pronunciation of dictionary term "plexiform fibrohistiocytic tumor"
    A rare tumor found mainly in children and young adults. It usually forms in the skin on the arms and legs. It is slow-growing and usually does not spread to other parts of the body. It is a type of soft tissue tumor.
  plexiform neurofibroma: (PLEK-sih-form NOOR-oh-fy-BROH-muh)
    Pronunciation of dictionary term "plexiform neurofibroma"
    A tumor that forms in the tissue that covers and protects the nerves. Plexiform neurofibromas can occur anywhere in the body outside of the brain and spinal cord. They can occur on the face (including around the eye), neck, arms, legs, back, chest, abdomen, and internal organs. Large tumors can cause a nerve to become thick and misshapen, which can affect the structure of nearby bone, skin, and muscle. Plexiform neurofibromas can cause severe pain, mobility problems, vision and hearing loss, high blood pressure, and other medical problems. Most plexiform neurofibromas are not cancer, but some may become cancer. They most commonly occur in children who have a rare genetic condition called neurofibromatosis type 1.
  plexopathy: (plek-SAH-puh-thee)
    Pronunciation of dictionary term "plexopathy"
    A disorder affecting a network of nerves, blood vessels, or lymph vessels.
  plicamycin: (PLY-kuh-MY-sin)
    Pronunciation of dictionary term "plicamycin"
    A drug used to treat some types of testicular cancer. It is also used to treat a higher-than-normal amounts of calcium in the blood or urine. Plicamycin binds to DNA and prevents cells from making RNA and proteins. It is a type of antineoplastic antibiotic. Also called Mithracin and mithramycin.
  PLL: A type of chronic lymphocytic leukemia (CLL) in which too many immature white blood cells (prolymphocytes) are found in the blood and bone marrow. PLL usually progresses more rapidly than classic CLL. Also called prolymphocytic leukemia.
  ploidy: (PLOY-dee)
    Pronunciation of dictionary term "ploidy"
    The number of sets of chromosomes in a cell or an organism. For example, haploid means one set and diploid means two sets.
  Plummer-Vinson syndrome: (PLUH-mer-VIN-sun SIN-drome)
    Pronunciation of dictionary term "Plummer-Vinson syndrome"
    A disorder marked by anemia caused by iron deficiency, and a web-like growth of membranes in the throat that makes swallowing difficult. Having Plummer-Vinson syndrome may increase the risk of developing esophageal cancer. Also called Paterson-Kelly syndrome and sideropenic dysphagia.
    More Information
    - Plummer Vinson syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8259/paterson-kelly-syndrome)
    - Plummer-Vinson syndrome (MedlinePlus) (https://medlineplus.gov/ency/article/001158.htm)
  pluripotent: (ploo-RIH-puh-tent)
    Pronunciation of dictionary term "pluripotent"
    Able to mature or develop in any of several ways.
  pluripotent stem cell: (ploo-RIH-puh-tent ...)
    Pronunciation of dictionary term "pluripotent stem cell"
    A cell that is able to develop into many different types of cells or tissues in the body.
  Pluvicto: (ploo-VIK-toh)
    Pronunciation of dictionary term "Pluvicto"
    A radioactive drug used to treat adults with PSMA-positive prostate cancer that has spread to other parts of the body and has not responded to treatments that lower testosterone levels. It is used in patients whose cancer has been treated with an androgen receptor inhibitor and who can either delay or have received treatment with a type of anticancer drug called a taxane. Pluvicto binds to a protein called PSMA, which is found on some prostate cancer cells. It gives off radiation that may kill the cancer cells. Pluvicto is a type of radioconjugate. Also called lutetium Lu 177 vipivotide tetraxetan.
    More Information
    - Lutetium Lu 177 Vipivotide Tetraxetan (https://www.cancer.gov/about-cancer/treatment/drugs/lutetium-Lu-177-vipivotide-tetraxetan)
  PLX4032: A drug used to treat Erdheim-Chester disease (a very rare type of histiocytosis) and advanced melanoma that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. PLX4032 blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called BRAF (V600E) kinase inhibitor RO5185426, RG7204, vemurafenib, and Zelboraf.
    More Information
    - Vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib)
  pM-81: A monoclonal antibody that is being studied in the detection and treatment of cancer. Monoclonal antibodies are produced in the laboratory and can locate and bind to cancer cells.
  PML gene: (… jeen)
    Pronunciation of dictionary term "PML gene"
    A gene that makes a protein that helps control cell growth and cell division. Mutations (changes) in the PML gene can occur when a piece of the chromosome containing the PML gene breaks off and joins with a gene called RARA on another chromosome. These changes may cause too many immature white blood cells to build up in the blood and bone marrow. This can lead to an aggressive (fast-growing) type of acute myeloid leukemia called acute promyelocytic leukemia. The PML gene is a type of tumor suppressor gene. Also called promyelocytic leukemia gene.
  PMN: A type of immune cell that has granules (small particles) with enzymes that are released during infections, allergic reactions, and asthma. Neutrophils, eosinophils, and basophils are PMNs. A PMN is a type of white blood cell. Also called granular leukocyte, granulocyte, and polymorphonuclear leukocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  PN401: A drug used in the emergency treatment of adults and children who receive too much fluorouracil or capecitabine or who have heart or central nervous system toxicity or other serious side effects that occur within 4 days of ending treatment with these drugs. PN401 may help protect healthy cells from some of the side effects caused by certain anticancer drugs. It is a type of chemoprotective agent and a type of pyrimidine analog. Also called triacetyluridine, uridine triacetate, and Vistogard.
    More Information
    - Uridine Triacetate (https://www.cancer.gov/about-cancer/treatment/drugs/uridinetriacetate)
  PNA: A type of anticancer drug that is similar to a natural chemical compound called purine. Cells use purine to make the chemical building blocks of DNA and RNA. PNAs may kill cells, including cancer cells, by blocking important enzymes needed to make DNA and RNA and by damaging DNA. Some PNAs are used to treat certain types of leukemia and lymphoma. Also called purine nucleoside analog.
  PNET: One of a group of cancers that develop from the same type of early cells, and share certain biochemical and genetic features. Some PNETs develop in the brain and central nervous system (CNS-PNET), and others develop in sites outside of the brain such as the limbs, pelvis, and chest wall (peripheral PNET). Also called primitive neuroectodermal tumor.
  pneumatic larynx: (noo-MA-tik LAYR-inx)
    Pronunciation of dictionary term "pneumatic larynx"
    A device that is used to help a person talk after a laryngectomy. It uses air to produce a humming sound, which is converted to speech by movement of the lips, tongue, or glottis.
  pneumonectomy: (NOO-moh-NEK-toh-mee)
    Pronunciation of dictionary term "pneumonectomy"
    Surgery to remove all of one lung. In a partial pneumonectomy, one or more lobes of a lung are removed.
    Pneumonectomy. The whole lung is removed.
    Pneumonectomy; drawing shows the trachea, lymph nodes, and lungs, with cancer in one lung. The removed lung with the cancer is shown.
  pneumonia: (noo-MOH-nyuh)
    Pronunciation of dictionary term "pneumonia"
    A severe inflammation of the lungs in which the alveoli (tiny air sacs) are filled with fluid. This may cause a decrease in the amount of oxygen that blood can absorb from air breathed into the lung. Pneumonia is usually caused by infection but may also be caused by radiation therapy, allergy, or irritation of lung tissue by inhaled substances. It may involve part or all of the lungs.
  pneumonitis: (NOO-moh-NY-tis)
    Pronunciation of dictionary term "pneumonitis"
    Inflammation of the lungs. This may be caused by disease, infection, radiation therapy, allergy, or irritation of lung tissue by inhaled substances.
  pneumothorax: (NOO-moh-THOR-ax)
    Pronunciation of dictionary term "pneumothorax"
    An abnormal collection of air in the space between the thin layer of tissue that covers the lungs and the chest cavity. This can cause all or part of the lung to collapse. A pneumothorax may be caused by a chest injury, certain medical procedures, lung disease, or other damage to lung tissue. Sometimes the cause of a pneumothorax is not known. The most common symptoms are sudden chest pain and trouble breathing. Some types of pneumothorax may go away on their own, but others may be life threatening.
  PNH: Paroxysmal nocturnal hemoglobinuria. A rare disorder in which red blood cells are easily destroyed by certain immune system proteins. Symptoms include blood clots, and red or brownish urine in the morning. Aplastic anemia (decreased production of blood cells) may lead to PNH, and people with this disorder are at increased risk of acute myelogenous leukemia. Also called paroxysmal nocturnal hemoglobinuria.
    More Information
    - Paroxysmal nocturnal hemoglobinuria (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7337/paroxysmal-nocturnal-hemoglobinuria)
    - Paroxysmal nocturnal hemoglobinuria (MedlinePlus) (https://medlineplus.gov/genetics/condition/paroxysmal-nocturnal-hemoglobinuria/)
  PNU 166148: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called topoisomerase inhibitors.
  PNU-93914: A form of the anticancer drug paclitaxel that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of several types of cancer. PNU-93914 blocks the ability of cells to divide and may kill cancer cells. It is a type of mitotic inhibitor and a type of antimicrotubule agent. Also called LEP-ETU, liposomal paclitaxel, LipoTaxen, and paclitaxel liposome.
  podiatrist: (puh-DY-uh-trist)
    Pronunciation of dictionary term "podiatrist"
    A doctor who has special training in diagnosing and treating foot and ankle problems.
  poikiloderma congenitale: (POY-kih-loh-DER-muh kun-JEH-nih-tal)
    Pronunciation of dictionary term "poikiloderma congenitale"
    A rare, inherited disorder that affects many parts of the body, especially the skin, eyes, bones, hair, and teeth. The main sign or symptom is a red blistering rash on the face that begins in early infancy. Over time, the rash can spread to the arms, legs, and buttocks and cause patchy skin coloring, areas of thin skin, and small clusters of blood vessels under the skin. Other signs and symptoms include slow growth and shorter-than-average height; little or no hair, including eyelashes and eyebrows; abnormalities of the nails, teeth, and bones; gastrointestinal problems; and blood problems. People with poikiloderma congenitale have an increased risk of developing cancer at an early age, especially osteosarcoma (a type of bone cancer), basal cell skin cancer, and squamous cell skin cancer. Poikiloderma congenitale may be caused by a mutation (change) in the RECQL4 gene. Also called Rothmund-Thomson syndrome and RTS.
    More Information
    - Rothmund-Thomson syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4392/rothmund-thomson-syndrome)
    - Rothmund-Thomson syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/rothmund-thomson-syndrome/)
  polatuzumab vedotin: (POH-lah-TOO-zoo-mab veh-DOH-tin)
    Pronunciation of dictionary term "polatuzumab vedotin"
    A drug used with other drugs to treat adults with certain types of diffuse large B-cell lymphoma. It is also being studied in the treatment of other types of cancer. Polatuzumab vedotin contains a monoclonal antibody that binds to a protein called CD79B, which is found on B cells (a type of white blood cell) and some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. Polatuzumab vedotin is a type of antibody-drug conjugate. Also called Polivy.
    More Information
    - Polatuzumab Vedotin-piiq (https://www.cancer.gov/about-cancer/treatment/drugs/polatuzumabvedotin-piiq)
  POLH gene: (... jeen)
    Pronunciation of dictionary term "POLH gene"
    A gene that makes a protein involved in copying DNA before a cell divides and in repairing damaged DNA. Mutations (changes) in the POLH gene have been found in an inherited condition called xeroderma pigmentosum. People with this condition have an extreme sensitivity to UV light and a very high risk of developing skin cancer and other types of cancer.
    More Information
    - POLH gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/polh/)
  polifeprosan 20 carmustine implant: (PAH-lee-FEH-proh-san … kar-MUS-teen IM-plant)
    Pronunciation of dictionary term "polifeprosan 20 carmustine implant"
    A drug used with surgery and radiation therapy to treat high-grade glioma that has not already been treated and with surgery to treat glioblastoma multiforme that has recurred (come back). Polifeprosan 20 carmustine implant is a form of carmustine contained in a wafer. The wafer has a coating that dissolves slowly and releases carmustine directly into the area where the brain tumor was removed. This form may have fewer side effects and work better than other forms of carmustine. Polifeprosan 20 carmustine implant is a type of alkylating agent and a type of nitrosourea. Also called carmustine implant and Gliadel Wafer.
    More Information
    - Carmustine Implant (https://www.cancer.gov/about-cancer/treatment/drugs/carmustineimplant)
  Polivy: (poh-LIH-vee)
    Pronunciation of dictionary term "Polivy"
    A drug used with other drugs to treat adults with certain types of diffuse large B-cell lymphoma. It is also being studied in the treatment of other types of cancer. Polivy contains a monoclonal antibody that binds to a protein called CD79B, which is found on B cells (a type of white blood cell) and some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. Polivy is a type of antibody-drug conjugate. Also called polatuzumab vedotin.
    More Information
    - Polatuzumab Vedotin-piiq (https://www.cancer.gov/about-cancer/treatment/drugs/polatuzumabvedotin-piiq)
  poly (ADP-ribose) polymerase: (PAH-lee (... RY-bose) puh-LIH-meh-rays)
    Pronunciation of dictionary term "poly (ADP-ribose) polymerase"
    A type of enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. Inhibitors of one enzyme, poly (ADP-ribose) polymerase-1, are being studied in the treatment of cancer. Also called PARP.
  poly (ADP-ribose) polymerase inhibitor: (PAH-lee (... RY-bose) puh-LIH-meh-rays in-HIH-bih-ter)
    Pronunciation of dictionary term "poly (ADP-ribose) polymerase inhibitor"
    A substance that blocks an enzyme in cells called PARP. PARP helps repair DNA when it becomes damaged. DNA damage may be caused by many things, including exposure to UV light, radiation, certain anticancer drugs, or other substances in the environment. In cancer treatment, blocking PARP may help keep cancer cells from repairing their damaged DNA, causing them to die. Poly (ADP-ribose) polymerase inhibitors are a type of targeted therapy. Also called PARP inhibitor.
  poly (ADP-ribose) polymerase-1: (PAH-lee (… RY-bose) puh-LIH-meh-rays-1)
    Pronunciation of dictionary term "poly (ADP-ribose) polymerase-1"
    An enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. Inhibitors of poly (ADP-ribose) polymerase-1 are being studied in the treatment of cancer. Also called PARP-1.
  poly-ICLC: (PAH-lee ...)
    Pronunciation of dictionary term "poly-ICLC"
    A substance that is being studied in the treatment of cancer and for its ability to stimulate the immune system. It is made in the laboratory by combining the nucleic acid RNA with the chemicals poly-L-lysine and carboxymethyl cellulose.
  polychlorinated biphenyl: (PAH-lee-KLOR-ih-NAY-ted BY-feh-nil)
    Pronunciation of dictionary term "polychlorinated biphenyl"
    One of a large group of man-made chemical compounds that were used to make many products, including electrical equipment, insulation, fluorescent lights, paints, plastics, rubber, dyes, inks, adhesives, and pesticides. Being exposed to polychlorinated biphenyls can cause skin conditions, such as acne and rashes, and eye irritation. Long-term exposure to high levels of polychlorinated biphenyls can affect other body systems, and may also cause learning and developmental delays, low birth weight, and cancer. Polychlorinated biphenyls were banned in the United States in the 1970s, but they may still be found in contaminated soil, air, water, and food. Also called PCB.
  polycyclic aromatic hydrocarbon: (pah-lee-SY-klik AYR-oh-MA-tik HY-droh-KAR-bun)
    Pronunciation of dictionary term "polycyclic aromatic hydrocarbon"
    A type of chemical formed when coal, oil, gas, garbage, tobacco, meat, and other substances are burned. These chemicals are also made for use in many products, including coal tar, creosote, roofing tar, pesticides, mothballs, dandruff shampoos, and some medicines. Being exposed to one of these chemicals over a long time may cause cancer. Also called PAH.
  polycystic ovary syndrome: (PAH-lee-SIS-tik OH-vuh-ree SIN-drome)
    Pronunciation of dictionary term "polycystic ovary syndrome"
    A condition marked by infertility, enlarged ovaries, menstrual problems, high levels of male hormones, excess hair on the face and body, acne, and obesity. Women with polycystic ovary syndrome have an increased risk of diabetes, high blood pressure, heart disease, and endometrial cancer. Also called PCOS.
  polycythemia vera: (PAH-lee-sy-THEE-mee-uh VAYR-uh)
    Pronunciation of dictionary term "polycythemia vera"
    A disease in which there are too many red blood cells in the bone marrow and blood, causing the blood to thicken. The number of white blood cells and platelets may also increase. The extra blood cells may collect in the spleen and cause it to become enlarged. They may also cause bleeding problems and make clots form in blood vessels.
  polyethylene glycol: (PAH-lee-EH-thih-leen GLY-kol)
    Pronunciation of dictionary term "polyethylene glycol"
    A polymer made by joining molecules of ethylene oxide and water together in a repeating pattern. Polyethylene glycol can be a liquid or a waxy solid. In medicine, forms of polyethylene glycol can be used in ointments, in drugs or substances to make them stay in the body longer, or in laxatives. Also called PEG.
  polyethylene glycosylated recombinant human megakaryocyte growth and development factor: (PAH-lee-EH-thih-leen gly-KAH-sih-lay-ted ree-KOM-bih-nunt HYOO-mun MEH-guh-KAYR-ee-oh-site …)
    Pronunciation of dictionary term "polyethylene glycosylated recombinant human megakaryocyte growth and development factor"
    A form of megakaryocyte growth and development factor (MGDF) that is made in the laboratory. MGDF comes from the protein thrombopoietin, which is normally made in the body to help make platelets. Polyethylene glycosylated recombinant human megakaryocyte growth and development factor is being studied as a way to increase the number of platelets in patients receiving chemotherapy. Also called PEG-MGDF and PEG-rhMGDF.
  polyglutamate camptothecin: (PAH-lee-GLOO-tuh-mayt KAMP-toh-THEK-in)
    Pronunciation of dictionary term "polyglutamate camptothecin"
    A form of the anticancer drug camptothecin that may have fewer side effects and work better than camptothecin. It is being studied in the treatment of cancer. It is a type of DNA topoisomerase inhibitor. Also called CT-2106.
  polymer: (PAH-lih-mer)
    Pronunciation of dictionary term "polymer"
    A molecule made up of small identical molecules called monomers. The monomers are joined together in a repeating pattern.
  polymerase chain reaction: (puh-LIH-meh-rays chayn ree-AK-shun)
    Pronunciation of dictionary term "polymerase chain reaction"
    A laboratory method used to make many copies of a specific piece of DNA from a sample that contains very tiny amounts of that DNA. Polymerase chain reaction allows these pieces of DNA to be amplified so they can be detected. Polymerase chain reaction may be used to look for certain changes in a gene or chromosome, which may help find and diagnose a genetic condition or a disease, such as cancer. It may also be used to look at pieces of the DNA of certain bacteria, viruses, or other microorganisms to help diagnose an infection. Also called PCR.
    More Information
    - Polymerase Chain Reaction (PCR) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Polymerase-Chain-Reaction)
  polymeric enteral nutrition formula: (PAH-lih-MAYR-ik EN-teh-rul noo-TRIH-shun FOR-myoo-luh)
    Pronunciation of dictionary term "polymeric enteral nutrition formula"
    A nutritional drink that may help people who cannot get everything they need in their diet from foods and other drinks. It may be taken by mouth or given through a small tube inserted through the nose into the stomach or the small intestine. It may also be given through a small tube that is put into the stomach or intestinal tract through an opening made on the outside of the abdomen. One example of a polymeric enteral nutrition formula is Ensure. Polymeric enteral nutrition formula is a type of dietary supplement.
  polymorphism: (PAH-lee-MOR-fih-zum)
    Pronunciation of dictionary term "polymorphism"
    A common change in the genetic code in DNA. Polymorphisms can have a harmful effect, a good effect, or no effect. Some polymorphisms have been shown to increase the risk of certain types of cancer.
    More Information
    - Polymorphism (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Polymorphism)
  polymorphonuclear leukocyte: (PAH-lee-MOR-foh-NOO-klee-er LOO-koh-site)
    Pronunciation of dictionary term "polymorphonuclear leukocyte"
    A type of immune cell that has granules (small particles) with enzymes that are released during infections, allergic reactions, and asthma. Neutrophils, eosinophils, and basophils are polymorphonuclear leukocytes. A polymorphonuclear leukocyte is a type of white blood cell. Also called granular leukocyte, granulocyte, and PMN.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  polymyositis: (PAH-lee-MY-oh-SY-tis)
    Pronunciation of dictionary term "polymyositis"
    An inflammatory disease of the muscles closest to the center of the body. It causes weakness, inability to stand, climb stairs, lift, or reach. It may also cause muscle pain and difficulty swallowing, and may affect the lungs and heart. Having polymyositis increases the risk of certain types of cancer.
  polyneuritis: (PAH-lee-noo-RY-tis)
    Pronunciation of dictionary term "polyneuritis"
    Inflammation of several peripheral nerves at the same time.
  polyp: (PAH-lip)
    Pronunciation of dictionary term "polyp"
    A growth that protrudes from a mucous membrane.
  polypectomy: (PAH-lee-PEK-toh-mee)
    Pronunciation of dictionary term "polypectomy"
    Surgery to remove a polyp.
  polypeptide: (PAH-lee PEP-tide)
    Pronunciation of dictionary term "polypeptide"
    A substance that contains many amino acids (the molecules that join together to form proteins).
  polyphenol: (PAH-lee-FEE-nol)
    Pronunciation of dictionary term "polyphenol"
    A substance that is found in many plants and gives some flowers, fruits, and vegetables their color. Polyphenols have antioxidant activity.
  Polyphenon E: (PAH-lee-FEE-nun ...)
    Pronunciation of dictionary term "Polyphenon E"
    A mixture that is prepared from the leaves of the Camellia sinensis plant. It contains substances called catechins, which are antioxidants. Antioxidants help protect cells from damage caused by certain chemicals that may increase the risk of cancer and other diseases. Polyphenon E is being studied in the prevention of cancer and other diseases. It is a trademarked product of Mitsui Norin Co., Ltd.
  polyposis: (PAH-lee-POH-sis)
    Pronunciation of dictionary term "polyposis"
    The development of numerous polyps (growths that protrude from a mucous membrane).
  polysaccharide: (PAH-lee-SA-kuh-ride)
    Pronunciation of dictionary term "polysaccharide"
    A large carbohydrate molecule. It contains many small sugar molecules that are joined chemically. Also called glycan.
  polysomnogram: (PAH-lee-SOM-noh-gram)
    Pronunciation of dictionary term "polysomnogram"
    A group of recordings taken during sleep that shows brain wave changes, eye movements, breathing rate, blood pressure, heart rate, and the electrical activity of the heart and other muscles. A polysomnogram may be used to help diagnose sleep disorders.
  polyvinylpyrrolidone-sodium hyaluronate gel: (PAH-lee-VY-nil-py-RAH-lih-done-SOH-dee-um HY-uh-LOO-roh-nayt …)
    Pronunciation of dictionary term "polyvinylpyrrolidone-sodium hyaluronate gel"
    A gel used to lessen pain from mouth sores caused by chemotherapy or radiation therapy, oral surgery, braces, or disease. Polyvinylpyrrolidone-sodium hyaluronate gel is being studied in the treatment of pain caused by mouth sores in children receiving cancer treatment. It forms a thin layer over the surface of the mouth and throat to prevent irritation while eating, drinking, and talking. Also called Gelclair.
  pomalidomide: (PAH-muh-LIH-doh-mide)
    Pronunciation of dictionary term "pomalidomide"
    A drug that is similar to thalidomide and is used alone or with other drugs to treat adults with certain types of multiple myeloma or Kaposi sarcoma. It is also being studied in the treatment of other types of cancer. Pomalidomide may help the immune system kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. Pomalidomide is a type of immunomodulating agent and a type of antiangiogenesis agent. Also called CC-4047 and Pomalyst.
    More Information
    - Pomalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/pomalidomide)
  Pomalyst: (PAH-muh-list)
    Pronunciation of dictionary term "Pomalyst"
    A drug that is similar to thalidomide and is used alone or with other drugs to treat adults with certain types of multiple myeloma or Kaposi sarcoma. It is also being studied in the treatment of other types of cancer. Pomalyst may help the immune system kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. Pomalyst is a type of immunomodulating agent and a type of antiangiogenesis agent. Also called CC-4047 and pomalidomide.
    More Information
    - Pomalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/pomalidomide)
  pomegranate: (PAH-meh-GRA-nut)
    Pronunciation of dictionary term "pomegranate"
    A subtropical shrub or tree. Juice from the fruit may contain substances that decrease or slow the rise of prostate-specific antigen (PSA) levels. It is being studied for its ability to delay or prevent recurrent prostate cancer. The scientific name is Punica granatum.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  ponatinib hydrochloride: (poh-NA-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "ponatinib hydrochloride"
    A drug used alone or with other drugs to treat adults with certain types of chronic myelogenous leukemia or Philadelphia chromosome–positive acute lymphoblastic leukemia. It is used in patients whose cancer is newly diagnosed, has the T315I mutation, or cannot be treated with other kinase inhibitors. It is also being studied in the treatment of other types of cancer. Ponatinib hydrochloride blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Ponatinib hydrochloride is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Iclusig.
    More Information
    - Ponatinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/ponatinibhydrochloride)
  pons: (ponz)
    Pronunciation of dictionary term "pons"
    Part of the central nervous system, located at the base of the brain, between the medulla oblongata and the midbrain. It is part of the brainstem.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  pontine: (PON-teen)
    Pronunciation of dictionary term "pontine"
    Having to do with the pons (part of the central nervous system, located at the base of the brain, between the medulla oblongata and the midbrain).
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
  population-based study: (PAH-pyoo-LAY-shun-bayst STUH-dee)
    Pronunciation of dictionary term "population-based study"
    A study of a group of individuals taken from the general population who share a common characteristic, such as age, sex, or health condition. This group may be studied for different reasons, such as their response to a drug or risk of getting a disease.
  porcine: (POR-sine)
    Pronunciation of dictionary term "porcine"
    Having to do with or coming from pigs.
  porfimer sodium: (POR-fih-mer SOH-dee-um)
    Pronunciation of dictionary term "porfimer sodium"
    A drug used to treat some types of cancer. When absorbed by cancer cells and exposed to light, porfimer sodium becomes active and kills the cancer cells. It is a type of photodynamic therapy agent. Also called Photofrin.
  porfiromycin: (POR-fih-roh-MY-sin)
    Pronunciation of dictionary term "porfiromycin"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called anticancer antibiotics.
  porphyria cutanea tarda: (por-FEER-ee-uh kyoo-TAY-nee-uh TAR-duh)
    Pronunciation of dictionary term "porphyria cutanea tarda"
    A rare disorder that affects the skin and causes painful blisters on parts of the body that are exposed to the sun, usually the hands, arms, and face. The affected skin may be fragile, and it may blister or peel after a minor injury. Other signs and symptoms of porphyria cutanea tarda include changes in skin color, increased hair growth (especially on the face), and redness, swelling, itching, scarring, and thickening of the affected skin. Liver problems may occur, and patients with porphyria cutanea tarda may have an increased risk of liver cancer. In porphyria cutanea tarda, the body does not make enough of an enzyme called uroporphyrinogen decarboxylase. Porphyria cutanea tarda may be inherited, or it may be caused by too much iron in the body, certain infections (such as hepatitis C or HIV infection), smoking, drinking too much alcohol, taking the hormone estrogen, and certain genetic disorders. Porphyria cutanea tarda is usually diagnosed after the age of 30 years. Also called PCT.
    More Information
    - Porphyria cutanea tarda (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7433/porphyria-cutanea-tarda)
    - Porphyria (MedlinePlus) (https://medlineplus.gov/genetics/condition/porphyria/)
  port: (port)
    Pronunciation of dictionary term "port"
    A device used to draw blood and give treatments, including intravenous fluids, blood transfusions, or drugs such as chemotherapy and antibiotics. The port is placed under the skin, usually in the right side of the chest. It is attached to a catheter (a thin, flexible tube) that is guided (threaded) into a large vein above the right side of the heart called the superior vena cava. A needle is inserted through the skin into the port to draw blood or give fluids and other treatments. A port may stay in place for many weeks, months, or years. Also called port-a-cath.
    Port-a-cath (Port). A port-a-cath is a device that is usually placed under the skin in the right side of the chest. It is attached to a catheter (a thin, flexible tube) that is threaded into a large vein above the right side of the heart called the superior vena cava. A port-a-cath is used to give intravenous fluids, blood transfusions, chemotherapy, and other drugs. It is also used for taking blood samples. A port-a-cath may stay in place for a long time and helps reduce the need for repeated needle sticks.
    Port-a-cath (Port); drawing showing a port-a-cath under the skin in the right side of the chest. It is attached to a catheter that is threaded into a large vein above the right side of the heart called the superior vena cava. The left inset shows the port-a-cath under the skin. The right inset shows a needle being inserted into the port-a-cath and blood being drawn from the port-a-cath through a syringe attached to the needle.
  port-a-cath: (port-uh-cath)
    Pronunciation of dictionary term "port-a-cath"
    A device used to draw blood and give treatments, including intravenous fluids, blood transfusions, or drugs such as chemotherapy and antibiotics. The port is placed under the skin, usually in the right side of the chest. It is attached to a catheter (a thin, flexible tube) that is guided (threaded) into a large vein above the right side of the heart called the superior vena cava. A needle is inserted through the skin into the port to draw blood or give fluids and other treatments. A port-a-cath may stay in place for many weeks, months, or years. Also called port.
    Port-a-cath (Port). A port-a-cath is a device that is usually placed under the skin in the right side of the chest. It is attached to a catheter (a thin, flexible tube) that is threaded into a large vein above the right side of the heart called the superior vena cava. A port-a-cath is used to give intravenous fluids, blood transfusions, chemotherapy, and other drugs. It is also used for taking blood samples. A port-a-cath may stay in place for a long time and helps reduce the need for repeated needle sticks.
    Port-a-cath (Port); drawing showing a port-a-cath under the skin in the right side of the chest. It is attached to a catheter that is threaded into a large vein above the right side of the heart called the superior vena cava. The left inset shows the port-a-cath under the skin. The right inset shows a needle being inserted into the port-a-cath and blood being drawn from the port-a-cath through a syringe attached to the needle.
  portal hypertension: (POR-tul HY-per-TEN-shun)
    Pronunciation of dictionary term "portal hypertension"
    High blood pressure in the vein that carries blood to the liver from the stomach, small and large intestines, spleen, pancreas, and gallbladder. It is usually caused by a block in the blood flow through the liver due to cirrhosis (scarring) of the liver.
  portal vein: (POR-tul vayn)
    Pronunciation of dictionary term "portal vein"
    A blood vessel that carries blood to the liver from the intestines, spleen, pancreas, and gallbladder. Also called hepatic portal vein.
  Portrazza: (por-TRA-zuh)
    Pronunciation of dictionary term "Portrazza"
    A drug used with gemcitabine and cisplatin to treat squamous non-small cell lung cancer that has spread to other parts of the body. It is used in patients whose cancer has not been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Portrazza binds to a protein called epidermal growth factor receptor (EGFR), which is found on some types of cancer cells. Blocking this protein may help keep cancer cells from growing. Portrazza is a type of monoclonal antibody. Also called necitumumab.
    More Information
    - Necitumumab (https://www.cancer.gov/about-cancer/treatment/drugs/necitumumab)
  positive axillary lymph node: (PAH-zih-tiv AK-suh-LAYR-ee limf ...)
    Pronunciation of dictionary term "positive axillary lymph node"
    A lymph node in the area of the armpit (axilla) to which cancer has spread. This spread is determined by surgically removing some of the lymph nodes and examining them under a microscope to see whether cancer cells are present.
  positive predictive value: (PAH-zih-tiv preh-DIK-tiv VAL-yoo)
    Pronunciation of dictionary term "positive predictive value"
    The likelihood that a person who has a positive test result does have the disease, condition, biomarker, or mutation (change) in the gene being tested. The positive predictive value is a way of measuring how accurate a specific test is. Also called PPV.
  positive test result: (PAH-zih-tiv ... reh-ZULT)
    Pronunciation of dictionary term "positive test result"
    A test result that shows that a person has the disease, condition, or biomarker for which the test is being done. In genetics, a positive test result usually means that a person has a mutation (change) in the gene, chromosome, or protein that is being tested. More testing may be needed to make a diagnosis or to make sure a positive test result is correct.
  positron emission tomography scan: (PAH-zih-tron ee-MIH-shun toh-MAH-gruh-fee skan)
    Pronunciation of dictionary term "positron emission tomography scan"
    A procedure in which a small amount of radioactive glucose (sugar) is injected into a vein, and a scanner is used to make detailed, computerized pictures of areas inside the body where the glucose is taken up. Because cancer cells often take up more glucose than normal cells, the pictures can be used to find cancer cells in the body. Also called PET scan.
    PET (positron emission tomography) scan. The patient lies on a table that slides through the PET machine. The head rest and white strap help the patient lie still. A small amount of radioactive glucose (sugar) is injected into the patient's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.
    PET (positron emission tomography) scan; drawing shows patient lying on table that slides through the PET machine.
  positron emission tomography-computed tomography scan: (PAH-zih-tron ee-MIH-shun toh-MAH-gruh-fee-kum-PYOO-ted-toh-MAH-gruh-fee skan)
    Pronunciation of dictionary term "positron emission tomography-computed tomography scan"
    A procedure that combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time with the same machine. The combined scans give more detailed pictures of areas inside the body than either scan gives by itself. A positron emission tomography-computed tomography scan may be used to help diagnose disease, such as cancer, plan treatment, or find out how well treatment is working. Also called PET-CT scan.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  positron emission tomography-magnetic resonance imaging scan: (PAH-zih-tron ee-MIH-shun toh-MAH-gruh-fee-mag-NEH-tik REH-zuh-nunts IH-muh-jing skan)
    Pronunciation of dictionary term "positron emission tomography-magnetic resonance imaging scan"
    A procedure that combines the pictures from a positron emission tomography (PET) scan and a magnetic resonance imaging (MRI) scan. A PET scan uses a radioactive tracer to highlight abnormal areas in the body. An MRI scan uses radio waves and a powerful magnet to take detailed pictures of tissues in the body. For a positron emission tomography-magnetic resonance imaging scan, the scans are done at the same time with the same machine. The combined scans give more detailed pictures of areas inside the body than either scan gives by itself. The overall amount of radiation a person is exposed to is also reduced. A positron emission tomography-magnetic resonance imaging scan may be used to help diagnose disease, such as cancer, plan treatment, or find out how well treatment is working. Also called PET-MRI scan.
  post-marketing surveillance trial: (post-MAR-keh-ting ser-VAY-lents TRY-ul)
    Pronunciation of dictionary term "post-marketing surveillance trial"
    A type of clinical trial that studies the side effects caused over time by a new treatment after it has been approved and is on the market. These trials look for side effects that were not seen in earlier trials and may also study how well a new treatment works over a long period of time. Post-marketing surveillance trials may include thousands of people. Also called phase 4 clinical trial and phase IV clinical trial.
  post-transplant lymphoproliferative disorder: (post-TRANZ-plant LIM-foh-proh-LIH-feh-ruh-tiv dis-OR-der)
    Pronunciation of dictionary term "post-transplant lymphoproliferative disorder"
    A condition in which a group of B-cells grow out of control after an organ transplant in patients with weakened immune systems. This usually happens if the patient has also been infected with Epstein-Barr virus. Post-transplant lymphoproliferative disorder may progress to non-Hodgkin lymphoma. Also called PTLD.
  post-traumatic stress disorder: (post-traw-MA-tik stres dis-OR-der)
    Pronunciation of dictionary term "post-traumatic stress disorder"
    An anxiety disorder that develops in reaction to physical injury or severe mental or emotional distress, such as military combat, violent assault, natural disaster, or other life-threatening events. Having cancer may also lead to post-traumatic stress disorder. Symptoms interfere with day-to-day living and include reliving the event in nightmares or flashbacks; avoiding people, places, and things connected to the event; feeling alone and losing interest in daily activities; and having trouble concentrating and sleeping. Also called PTSD.
    More Information
    - Cancer-Related Post-Traumatic Stress
  posterior: (pos-TEER-ee-er)
    Pronunciation of dictionary term "posterior"
    In human anatomy, has to do with the back of a structure, or a structure found toward the back of the body.
  posterior pelvic exenteration: (pos-TEER-ee-er PEL-vik eg-ZEN-teh-RAY-shun)
    Pronunciation of dictionary term "posterior pelvic exenteration"
    Surgery to remove the lower part of the bowel, rectum, uterus, cervix, ovaries, fallopian tubes, and vagina. Pelvic lymph nodes may also be removed.
  posterior reversible encephalopathy syndrome: (pos-TEER-ee-er ree-VER-sih-bul en-SEH-fuh-LAH-puh-thee SIN-drome)
    Pronunciation of dictionary term "posterior reversible encephalopathy syndrome"
    A rare condition marked by headaches, vision problems, mental changes, seizures, and swelling in the brain. The symptoms of posterior reversible encephalopathy syndrome usually come on quickly and can be serious and life threatening. When treated, symptoms often go away within days or weeks. Posterior reversible encephalopathy syndrome may occur in patients with certain conditions, such as high blood pressure, eclampsia, severe infection, kidney disease, and certain autoimmune diseases. It may also occur in patients treated with certain anticancer drugs and immunosuppressive drugs. Also called PRES, reversible posterior leukoencephalopathy syndrome, and RPLS.
  posterior urethral cancer: (pos-TEER-ee-er yoo-REE-thrul KAN-ser)
    Pronunciation of dictionary term "posterior urethral cancer"
    A disease in which malignant (cancer) cells are found in the part of the urethra (the tube through which urine leaves the body) that connects to the bladder (the organ that stores urine).
  postmenopausal: (post-MEH-nuh-PAW-zul)
    Pronunciation of dictionary term "postmenopausal"
    Having to do with the time after menopause. Menopause (“change of life”) is the time in a woman's life when menstrual periods stop permanently.
  postmortem: (post-MOR-tem)
    Pronunciation of dictionary term "postmortem"
    After death. Often used to describe an autopsy.
  postoperative: (post-AH-pruh-tiv)
    Pronunciation of dictionary term "postoperative"
    After surgery.
  postpartum: (post-PAR-tum)
    Pronunciation of dictionary term "postpartum"
    The time that begins right after a woman gives birth and lasts about 6 weeks.
  postprandial: (post-PRAN-dee-ul)
    Pronunciation of dictionary term "postprandial"
    After a meal.
  postremission therapy: (post-reh-MIH-shun THAYR-uh-pee)
    Pronunciation of dictionary term "postremission therapy"
    Treatment that is given after cancer has disappeared following the initial therapy. Postremission therapy is used to kill any cancer cells that may be left in the body. It may include radiation therapy, a stem cell transplant, or treatment with drugs that kill cancer cells. Also called consolidation therapy and intensification therapy.
  potassium: (puh-TA-see-um)
    Pronunciation of dictionary term "potassium"
    A metallic element that is important in body functions such as regulation of blood pressure and of water content in cells, transmission of nerve impulses, digestion, muscle contraction, and heartbeat.
  potassium hydroxide: (puh-TA-see-um hy-DROK-side)
    Pronunciation of dictionary term "potassium hydroxide"
    A toxic and highly corrosive chemical used to make soap, in bleaching, and as a paint remover. It is used in small amounts as a food additive and in the preparation of some drugs.
  Poteligeo: (poh-teh-LIH-gee-oh)
    Pronunciation of dictionary term "Poteligeo"
    A drug used to treat adults with mycosis fungoides or Sezary syndrome (types of cutaneous T-cell lymphoma) that came back or did not get better after treatment with at least one systemic therapy. It is also being studied in the treatment of other types of cancer. Poteligeo binds to a protein called CCR4, which is found on some T cells (a type of white blood cell) and some types of lymphoma cells. Poteligeo may block this protein and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called mogamulizumab.
    More Information
    - Mogamulizumab-kpkc (https://www.cancer.gov/about-cancer/treatment/drugs/mogamulizumabkpkc)
  potentiation: (poh-TEN-shee-AY-shun)
    Pronunciation of dictionary term "potentiation"
    In medicine, the effect of increasing the potency or effectiveness of a drug or other treatment.
  power of attorney: (POW-er ... uh-TER-nee)
    Pronunciation of dictionary term "power of attorney"
    A legal document that gives one person (such as a spouse, relative, friend, or lawyer) the authority to make legal, medical, or financial decisions for another person. A standard power of attorney may go into effect right away but becomes invalid when the person who grants it is no longer able to make decisions for themself, dies, or cancels it. It may also need to be renewed over time.
  PP: A small protein made by the pancreas that helps control the release of other substances made by the pancreas. The amount of PP in the blood increases after a person eats. It may also increase with age, and in certain diseases, such as diabetes and pancreatic cancer. Also called pancreatic polypeptide.
  PPAR gamma pathway: (… GA-muh PATH-way)
    Pronunciation of dictionary term "PPAR gamma pathway"
    Describes a group of proteins in a cell that work together to help control how certain genes are expressed and the use of lipids (fats) and glucose (sugar) in the body. Changes in the PPAR gamma pathway may lead to diseases such as heart disease, diabetes, and cancer. Drugs or substances that affect this pathway are being studied in the prevention and treatment of cancer and other diseases. Also called peroxisome proliferator-activated receptor gamma pathway.
  PPI: A substance used to treat certain disorders of the stomach and intestines, such as heartburn and ulcers. PPIs block the actions of an enzyme in the stomach and reduce the amount of acid made in the stomach. Also called proton pump inhibitor.
  PPN: A form of short-term nutritional support that is given directly into the bloodstream through a catheter placed into a vein. PPN bypasses the digestive system and may be given when a person has a disease or condition that affects their ability to absorb nutrients through the digestive system. PPN is supplemental nutrition that is given when a person cannot get enough calories or the right amount of nutrients that their body needs from the food they are eating. Also called partial parenteral nutrition.
  pPNET: A type of cancer that forms in bone or soft tissue. Also called Ewing sarcoma and peripheral primitive neuroectodermal tumor.
    More Information
    - Bone Cancer (https://www.cancer.gov/types/bone)
  PPV: The likelihood that a person who has a positive test result does have the disease, condition, biomarker, or mutation (change) in the gene being tested. The PPV is a way of measuring how accurate a specific test is. Also called positive predictive value.
  PR: A protein found inside the cells of the female reproductive tissue, some other types of tissue, and some cancer cells. The hormone progesterone will bind to the receptors inside the cells and may cause the cells to grow. Also called progesterone receptor.
  PR negative: (... NEH-guh-tiv)
    Pronunciation of dictionary term "PR negative"
    Describes cells that do not have a protein that binds to the hormone progesterone. Cancer cells that are PR negative do not need progesterone to grow. This means that they will keep growing when progesterone is not present and do not stop growing when treated with substances that block progesterone from binding. Also called progesterone receptor negative.
  PR positive: (... PAH-zih-tiv)
    Pronunciation of dictionary term "PR positive"
    Describes cells that have a protein that binds to the hormone progesterone. Cancer cells that are PR positive may need progesterone to grow. These cells may stop growing or die when treated with substances that block the binding and actions of progesterone. Also called progesterone receptor positive.
  PR-104: A substance being studied in the treatment of cancer. PR-104 becomes active when cancer cells don’t receive enough oxygen. It may kill cancer cells by damaging their DNA.
  practitioner: (prak-TIH-shuh-ner)
    Pronunciation of dictionary term "practitioner"
    A person who works in a specific profession. For example, a doctor or nurse is a health care practitioner.
  pralatrexate: (PRA-luh-TREK-sayt)
    Pronunciation of dictionary term "pralatrexate"
    A drug used to treat peripheral T-cell lymphoma (a fast-growing form of non-Hodgkin lymphoma) that recurred (came back) or did not get better with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Pralatrexate stops cells from using folic acid to make DNA. This may help keep cancer cells from growing and may kill them. Pralatrexate is a type of antimetabolite and a type of dihydrofolate reductase inhibitor. Also called Folotyn.
    More Information
    - Pralatrexate (https://www.cancer.gov/about-cancer/treatment/drugs/pralatrexate)
  pralsetinib: (pral-SEH-tih-nib)
    Pronunciation of dictionary term "pralsetinib"
    A drug used to treat adults with non-small cell lung cancer that has a RET fusion gene and has spread to other parts of the body and adults and children aged 12 years and older with thyroid cancer that has a RET fusion gene, has spread, and needs treatment with systemic therapy. This includes patients whose thyroid cancer did not respond to radioactive iodine. It is also being studied in the treatment of other types of cancer. Pralsetinib blocks certain proteins made by the RET fusion gene, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Gavreto.
    More Information
    - Pralsetinib (https://www.cancer.gov/about-cancer/treatment/drugs/pralsetinib)
  Pravachol: (PRA-vuh-KOL)
    Pronunciation of dictionary term "Pravachol"
    A drug used to lower the amount of cholesterol in the blood and to prevent stroke and heart attack. It is also being studied in the treatment of cancer and other conditions. Pravachol blocks an enzyme that helps make cholesterol in the body. It may also make tumor cells more sensitive to anticancer drugs. It is a type of HMG-CoA reductase inhibitor, a type of statin, and a type of chemosensitizer. Also called pravastatin sodium.
  pravastatin: (PRA-vuh-sta-tin)
    Pronunciation of dictionary term "pravastatin"
    The active ingredient in a drug used to lower the amount of cholesterol in the blood and to prevent stroke and heart attack. It is also being studied in the treatment of cancer and other conditions. Pravastatin blocks an enzyme that helps make cholesterol in the body. It may also make tumor cells more sensitive to anticancer drugs. It is a type of HMG-CoA reductase inhibitor, a type of statin, and a type of chemosensitizer.
  pravastatin sodium: (PRA-vuh-sta-tin SOH-dee-um)
    Pronunciation of dictionary term "pravastatin sodium"
    A drug used to lower the amount of cholesterol in the blood and to prevent stroke and heart attack. It is also being studied in the treatment of cancer and other conditions. Pravastatin sodium blocks an enzyme that helps make cholesterol in the body. It may also make tumor cells more sensitive to anticancer drugs. It is a type of HMG-CoA reductase inhibitor, a type of statin, and a type of chemosensitizer. Pravastatin is the active ingredient of pravastatin sodium. Also called Pravachol.
  PRCA: A rare disorder in which the bone marrow does not make enough red blood cells. Signs and symptoms include fatigue, pale skin, breathing problems, dizziness, and headaches. PRCA mainly affects adults and may be caused by infection, kidney failure, an autoimmune disease (such as lupus or rheumatoid arthritis), pregnancy, a thymoma (tumor of the thymus gland), and certain types of cancer, including leukemia. It may also be caused by taking certain medicines. PRCA may also be inherited and seen in the first year of life, but this is very rare. Also called pure red cell aplasia.
    More Information
    - Pure red cell aplasia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7504/pure-red-cell-aplasia)
  PRCC: A type of kidney cancer that forms in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Most papillary tumors look like long, thin finger-like growths under a microscope. There are two types of PRCC: type 1 and type 2. Type 1 tends to grow slowly and spread to other parts of the body less often than type 2. Patients with a genetic disorder called hereditary papillary renal cancer have an increased risk of type 1 PRCC. Patients with a genetic disorder called hereditary leiomyomatosis and renal cell cancer have an increased risk of type 2 PRCC. Also called papillary kidney cancer and papillary renal cell carcinoma.
    More Information
    - Papillary renal cell carcinoma (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma)
    Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.
    Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.
  precancerous: (pree-KAN-seh-rus)
    Pronunciation of dictionary term "precancerous"
    A term used to describe a condition that may (or is likely to) become cancer. Also called premalignant.
  precancerous dermatitis: (pree-KAN-seh-rus DER-muh-TY-tis)
    Pronunciation of dictionary term "precancerous dermatitis"
    A skin disease marked by scaly or thickened patches on the skin and often caused by prolonged exposure to arsenic. The patches often occur on sun-exposed areas of the skin and in older white men. These patches may become malignant (cancer). Also called Bowen disease and precancerous dermatosis.
  precancerous dermatosis: (pree-KAN-seh-rus DER-muh-TOH-sis)
    Pronunciation of dictionary term "precancerous dermatosis"
    A skin disease marked by scaly or thickened patches on the skin and often caused by prolonged exposure to arsenic. The patches often occur on sun-exposed areas of the skin and in older white men. These patches may become malignant (cancer). Also called Bowen disease and precancerous dermatitis.
  precancerous polyps: (pree-KAN-seh-rus PAH-lips)
    Pronunciation of dictionary term "precancerous polyps"
    Growths that may become cancer that protrude from a mucous membrane.
  precision medicine: (pree-SIH-zhun MEH-dih-sin)
    Pronunciation of dictionary term "precision medicine"
    A form of medicine that uses information about a person’s genes, proteins, environment, and lifestyle to prevent, diagnose, or treat disease. In cancer, precision medicine uses specific information about a person’s tumor to help make a diagnosis, plan treatment, find out how well treatment is working, or make a prognosis. Precision medicine may also be used to help determine a person’s risk of developing certain types of cancer. Examples of precision medicine include using targeted therapies to treat specific types of cancer, such as HER2-positive breast cancer, or using tumor marker testing to help diagnose cancer. Precision medicine is sometimes called personalized medicine.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  preclinical study: (pree-KLIH-nih-kul STUH-dee)
    Pronunciation of dictionary term "preclinical study"
    Research using animals to find out if a drug, procedure, or treatment is likely to be useful. Preclinical studies take place before any testing in humans is done.
  precursor B-lymphoblastic leukemia: (pree-KER-ser B-LIM-foh-BLAS-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "precursor B-lymphoblastic leukemia"
    An aggressive (fast-growing) type of leukemia (blood cancer) in which too many B-cell lymphoblasts (immature white blood cells) are found in the bone marrow and blood. It is the most common type of acute lymphoblastic leukemia (ALL). Also called B-cell acute lymphoblastic leukemia and B-cell acute lymphocytic leukemia.
  precursor lymphoblastic lymphoma: (pree-KER-ser LIM-foh-BLAS-tik lim-FOH-muh)
    Pronunciation of dictionary term "precursor lymphoblastic lymphoma"
    An aggressive (fast-growing) type of non-Hodgkin lymphoma in which too many lymphoblasts (immature white blood cells) are found in the lymph nodes and the thymus gland. These lymphoblasts may spread to other places in the body. It is most common in teenagers and young adults and affects more males than females. It may be a T or B cell type. Also called lymphoblastic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  precursor T-lymphoblastic leukemia: (pree-KER-ser T-LIM-foh-BLAS-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "precursor T-lymphoblastic leukemia"
    An aggressive (fast-growing) type of leukemia (blood cancer) in which too many T-cell lymphoblasts (immature white blood cells) are found in the bone marrow and blood. Also called T-cell acute lymphoblastic leukemia and T-cell acute lymphocytic leukemia.
  precursor T-lymphoblastic lymphoma: (pree-KER-ser T-LIM-foh-BLAS-tik lim-FOH-muh)
    Pronunciation of dictionary term "precursor T-lymphoblastic lymphoma"
    A type of non-Hodgkin lymphoma in which too many T-cell lymphoblasts (immature white blood cells) are found in the lymph nodes and spleen. It is most common in young men. Also called T-lymphoblastic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  prediabetes: (pree-dy-uh-BEE-teez)
    Pronunciation of dictionary term "prediabetes"
    A common condition in which glucose levels in the blood are higher than normal but not high enough to be diagnosed as type 2 diabetes. Having prediabetes increases the risk of developing type 2 diabetes, heart disease, and stroke. Prediabetes usually occurs when the body does not make enough insulin or use it the way it should. Most people with prediabetes do not have symptoms. There are many factors that may increase a person’s risk of developing prediabetes. These include being overweight; being age 45 years or older; having a parent, brother, sister, or child with type 2 diabetes; and not getting enough exercise. Certain health conditions, such as obesity, high blood pressure, abnormal cholesterol levels, heart disease, stroke, and polycystic ovary syndrome, can also increase a person’s risk of prediabetes. People who had diabetes during pregnancy, gave birth to a baby who weighed more than 9 pounds, or who are members of certain racial or ethnic groups also have an increased risk of prediabetes. Lifestyle changes, such as losing extra weight, eating a healthy diet, and getting regular exercise, can lower the risk of developing prediabetes or type 2 diabetes.
    More Information
    - Prediabetes – Your Chance to Prevent Type 2 Diabetes (Centers for Disease Control and Prevention) (https://www.cdc.gov/diabetes/prevention-type-2/prediabetes-prevent-type-2.html)
    - Prediabetes (MedlinePlus) (https://medlineplus.gov/ency/patientinstructions/000778.htm)
  predictive factor: (preh-DIK-tiv FAK-ter)
    Pronunciation of dictionary term "predictive factor"
    A condition or finding that can be used to help predict whether a person’s cancer will respond to a specific treatment. Predictive factor may also describe something that increases a person’s risk of developing a condition or disease.
  predisposing mutation: (PREE-dih-SPOH-zing myoo-TAY-shun)
    Pronunciation of dictionary term "predisposing mutation"
    A change in the DNA sequence of a gene that causes a person to have or be at risk of developing a certain genetic disorder or disease, such as cancer. Predisposing mutations can be inherited from a parent or occur during a person’s lifetime. Knowing if a person has a predisposing mutation may help prevent, diagnose, and treat diseases, such as cancer. Not everyone who has a predisposing mutation will develop the disease. Also called deleterious mutation, disease-causing mutation, pathogenic variant, and susceptibility gene mutation.
  prednisolone: (pred-NIH-suh-lone)
    Pronunciation of dictionary term "prednisolone"
    A drug that lessens inflammation and suppresses the body’s immune response. It may also kill cancer cells. Prednisolone is used to treat disorders in many organ systems and to treat the symptoms of several types of leukemia and lymphoma. It is also being studied in the treatment of other types of cancer. Prednisolone is a type of therapeutic glucocorticoid.
  prednisone: (PRED-nih-sone)
    Pronunciation of dictionary term "prednisone"
    A drug used to reduce inflammation and lower the body’s immune response. It is used with other drugs to treat leukemia, lymphoma, and mycosis fungoides (a type of skin lymphoma). It is also used alone or with other drugs to prevent or treat many other conditions. These include conditions related to cancer and its treatment, such as anemia (a low level of red blood cells) and allergic reactions. Prednisone is a type of therapeutic glucocorticoid.
    More Information
    - Prednisone (https://www.cancer.gov/about-cancer/treatment/drugs/prednisone)
  pregabalin: (pree-GA-buh-lin)
    Pronunciation of dictionary term "pregabalin"
    A drug used to treat nerve pain caused by diabetes or herpes zoster infection and certain types of seizures. It is being studied in the prevention and treatment of nerve pain in the hands and feet of cancer patients given chemotherapy. Pregabalin is a type of anticonvulsant. Also called Lyrica.
  pregnancy: (PREG-nun-see)
    Pronunciation of dictionary term "pregnancy"
    The condition between conception (fertilization of an egg by a sperm) and birth, during which the fertilized egg develops in the uterus. In humans, pregnancy lasts about 288 days.
  premalignant: (pree-muh-LIG-nunt)
    Pronunciation of dictionary term "premalignant"
    A term used to describe a condition that may (or is likely to) become cancer. Also called precancerous.
  premature birth: (PREE-muh-CHOOR berth)
    Pronunciation of dictionary term "premature birth"
    The birth of a baby before 37 weeks of pregnancy. In humans, a normal pregnancy lasts about 40 weeks. The risk of premature birth may be increased by certain health problems in the mother, such as diabetes, heart disease, and kidney disease, or problems during pregnancy. Smoking cigarettes, being exposed to secondhand tobacco smoke, drinking alcohol, and taking certain drugs during pregnancy may also increase the risk of a premature birth. Also called preterm birth.
  premature death: (PREE-muh-CHOOR deth)
    Pronunciation of dictionary term "premature death"
    Death that occurs before the average age of death in a certain population. In the United States, the average age of death is about 75 years. Smoking cigarettes and being exposed to secondhand tobacco smoke are leading causes of premature death in the United States. They can increase the risk of cancer, heart disease, stroke, lung disease, and many other health problems. Other causes of premature death are injuries and suicide.
  premature menopause: (PREE-muh-CHOOR MEH-nuh-pawz)
    Pronunciation of dictionary term "premature menopause"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. There are two types of premature menopause, primary and secondary. Primary premature menopause means that the ovaries do not function normally. This may be because they have been removed by surgery, or it may be caused by some cancer treatments and certain diseases or genetic conditions. In secondary premature menopause, the ovaries are normal but there is a problem getting hormone signals to them from the brain. This is usually caused by diseases of the pituitary gland or hypothalamus. Some women with premature menopause sometimes have menstrual periods and may be able to have children. Also called early menopause, ovarian failure, and ovarian insufficiency.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  premature ovarian failure: (PREE-muh-CHOOR oh-VAYR-ee-un FAYL-yer)
    Pronunciation of dictionary term "premature ovarian failure"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. Premature ovarian failure means the ovaries do not function normally. This may be because they have been removed by surgery, or it may be caused by some cancer treatments and certain diseases or genetic conditions. Some women with premature ovarian failure sometimes have menstrual periods and may be able to have children. Also called primary ovarian insufficiency.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  premenopausal: (pree-MEH-nuh-PAW-zul)
    Pronunciation of dictionary term "premenopausal"
    Having to do with the time before menopause. Menopause ("change of life") is the time of life when a woman's menstrual periods stop permanently.
  premycotic phase: (PREE-my-KAH-tik fayz)
    Pronunciation of dictionary term "premycotic phase"
    A phase of mycosis fungoides in which a patient has areas of red, scaly, itchy skin on areas of the body that are usually not exposed to sun. This is early-phase mycosis fungoides, but it is hard to diagnose the rash as mycosis fungoides during this phase. The premycotic phase may last from months to decades.
  prenatal: (pree-NAY-tul)
    Pronunciation of dictionary term "prenatal"
    Having to do with the time a female is pregnant, before birth occurs. Also called antenatal.
  PRES: A rare condition marked by headaches, vision problems, mental changes, seizures, and swelling in the brain. The symptoms of PRES usually come on quickly and can be serious and life threatening. When treated, symptoms often go away within days or weeks. PRES may occur in patients with certain conditions, such as high blood pressure, eclampsia, severe infection, kidney disease, and certain autoimmune diseases. It may also occur in patients treated with certain anticancer drugs and immunosuppressive drugs. Also called posterior reversible encephalopathy syndrome, reversible posterior leukoencephalopathy syndrome, and RPLS.
  prescription: (prih-SKRIP-shun)
    Pronunciation of dictionary term "prescription"
    A doctor's order for medicine or another intervention.
  pressure sore: (PREH-sher sor)
    Pronunciation of dictionary term "pressure sore"
    Damage to an area of the skin caused by constant pressure on the area for a long time. This pressure can lessen blood flow to the affected area, which may lead to tissue damage and tissue death. Pressure sores often form on the skin covering bony areas of the body, such as the back, tailbone, hips, buttocks, elbows, heels, and ankles. Patients who are not able to get out of bed or change their position, or who always use a wheelchair have an increased risk of pressure sores. Signs and symptoms include changes in skin color and swelling, warmth, tenderness, and pain in the affected area. If untreated, the skin may crack, blister, or break open and form a sore or ulcer, which may have pus-like drainage. Pressure sores often heal slowly and if not treated can damage tissues deep under the skin, including fat, muscle, and bone. Also called bedsore, decubitus ulcer, and pressure ulcer.
  pressure ulcer: (PREH-sher UL-ser)
    Pronunciation of dictionary term "pressure ulcer"
    Damage to an area of the skin caused by constant pressure on the area for a long time. This pressure can lessen blood flow to the affected area, which may lead to tissue damage and tissue death. Pressure ulcers often form on the skin covering bony areas of the body, such as the back, tailbone, hips, buttocks, elbows, heels, and ankles. Patients who are not able to get out of bed or change their position, or who always use a wheelchair have an increased risk of pressure ulcers. Signs and symptoms include changes in skin color and swelling, warmth, tenderness, and pain in the affected area. If untreated, the skin may crack, blister, or break open and form a sore or ulcer, which may have pus-like drainage. Pressure ulcers often heal slowly and if not treated can damage tissues deep under the skin, including fat, muscle, and bone. Also called bedsore, decubitus ulcer, and pressure sore.
  preterm birth: (PREE-term berth)
    Pronunciation of dictionary term "preterm birth"
    The birth of a baby before 37 weeks of pregnancy. In humans, a normal pregnancy lasts about 40 weeks. The risk of preterm birth may be increased by certain health problems in the mother, such as diabetes, heart disease, and kidney disease, or problems during pregnancy. Smoking cigarettes, being exposed to secondhand tobacco smoke, drinking alcohol, and taking certain drugs during pregnancy may also increase the risk of a preterm birth. Also called premature birth.
  pretracheal space: (pree-TRAY-kee-ul spays)
    Pronunciation of dictionary term "pretracheal space"
    The area in front of the trachea (windpipe).
  Prevacid: (PREH-vuh-sid)
    Pronunciation of dictionary term "Prevacid"
    A drug that reduces the amount of acid made in the stomach. It is used to treat stomach ulcers, gastroesophageal reflux disease (a condition in which acid from the stomach causes heartburn), and conditions in which the stomach makes too much acid. Prevacid is a type of proton pump inhibitor (PPI). Also called lansoprazole.
  prevalence: (PREH-vih-lents)
    Pronunciation of dictionary term "prevalence"
    In medicine, a measure of the total number of people in a specific group who have (or had) a certain disease, condition, or risk factor (such as smoking or obesity) at a specific point in time or during a given period of time. For example, the prevalence of breast cancer may show how many women in the U.S. were diagnosed with breast cancer within the past 10 years, including those who are receiving treatment and those who are considered cured, and are still alive on a certain date.
  prevascular space: (pree-VAS-kyoo-ler ...)
    Pronunciation of dictionary term "prevascular space"
    The area in the front part of the chest between the lungs. Also called anterior mediastinum.
  prevention: (pree-VEN-shun)
    Pronunciation of dictionary term "prevention"
    In medicine, action taken to decrease the chance of getting a disease or condition. For example, cancer prevention includes avoiding risk factors (such as smoking, obesity, lack of exercise, and radiation exposure) and increasing protective factors (such as getting regular physical activity, staying at a healthy weight, and having a healthy diet).
    More Information
    - Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention)
    - PDQ® Cancer Information Summaries: Prevention (https://www.cancer.gov/publications/pdq/information-summaries/prevention)
  preventive: (pree-VEN-tiv)
    Pronunciation of dictionary term "preventive"
    Used to prevent disease.
    More Information
    - Causes and Prevention (https://www.cancer.gov/about-cancer/causes-prevention)
  preventive mastectomy: (pree-VEN-tiv ma-STEK-toh-mee)
    Pronunciation of dictionary term "preventive mastectomy"
    Surgery to reduce the risk of breast cancer by removing one or both breasts before disease develops. Preventive mastectomy may be done in people who have a very high risk of developing breast cancer. Also called prophylactic mastectomy and risk-reducing mastectomy.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  Prialt: (PREE-ult)
    Pronunciation of dictionary term "Prialt"
    A drug used in the treatment of chronic pain. Also called SNX 111 and ziconotide.
  primary cancer: (PRY-mayr-ee KAN-ser)
    Pronunciation of dictionary term "primary cancer"
    A term used to describe the original, or first, tumor in the body. Cancer cells from a primary cancer may spread to other parts of the body and form new, or secondary, tumors. This is called metastasis. These secondary tumors are the same type of cancer as the primary cancer. Also called primary tumor.
  primary care: (PRY-mayr-ee kayr)
    Pronunciation of dictionary term "primary care"
    Health services that meet most basic health care needs over time. Primary care includes physical exams, treatment of common medical conditions, and preventive care such as immunizations and screenings. Primary care doctors are usually the first health professionals patients see for basic medical care. They may refer a patient to a specialist if needed.
  primary care provider: (PRY-mayr-ee kayr proh-VY-der)
    Pronunciation of dictionary term "primary care provider"
    A doctor or other licensed medical professional, such as a nurse practitioner or physician assistant, who manages a person’s health care over time. Primary care providers diagnose and treat a wide range of common medical conditions. They also provide preventive care, such as disease screenings and immunizations. A primary care provider may also refer a person to a specialist or coordinate care given by a specialist. Also called PCP.
  primary central nervous system lymphoma: (PRY-mayr-ee SEN-trul NER-vus SIS-tem lim-FOH-muh)
    Pronunciation of dictionary term "primary central nervous system lymphoma"
    Cancer that forms in the lymph tissue of the brain, spinal cord, meninges (outer covering of the brain), or eye (called ocular lymphoma). Also called PCNSL and primary CNS lymphoma.
    More Information
    - Primary CNS Lymphoma Treatment
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  primary CNS lymphoma: (PRY-mayr-ee…lim-FOH-muh)
    Pronunciation of dictionary term "primary CNS lymphoma"
    Cancer that forms in the lymph tissue of the brain, spinal cord, meninges (outer covering of the brain), or eye (called ocular lymphoma). Also called PCNSL and primary central nervous system lymphoma.
    More Information
    - Primary CNS Lymphoma Treatment
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  primary effusion lymphoma: (PRY-mayr-ee eh-FYOO-zhun lim-FOH-muh)
    Pronunciation of dictionary term "primary effusion lymphoma"
    A rare, aggressive (fast-growing) type of B-cell non-Hodgkin lymphoma marked by an abnormal build-up of fluids in a body cavity. It usually occurs together with a human herpesvirus or Epstein-Barr virus in people who have weakened immune systems, such as in patients with HIV disease.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  primary endpoint: (PRY-mayr-ee END-poynt)
    Pronunciation of dictionary term "primary endpoint"
    The main result that is measured at the end of a study to see if a given treatment worked (e.g., the number of deaths or the difference in survival between the treatment group and the control group). What the primary endpoint will be is decided before the study begins.
  primary mediastinal large B-cell lymphoma: (PRY-mayr-ee MEE-dee-uh-STY-nul larj ... sel lim-FOH-muh)
    Pronunciation of dictionary term "primary mediastinal large B-cell lymphoma"
    An aggressive (fast-growing) type of B-cell non-Hodgkin lymphoma (cancer of the immune system). Primary mediastinal large B-cell lymphoma develops from B cells in the mediastinum (the area behind the breastbone). It may spread to organs and tissues such as the lungs, pericardium (sac around the heart), liver, gastrointestinal tract, ovaries, adrenal glands, and central nervous system. Most patients with primary mediastinal large B-cell lymphoma are women who are age 30 to 40 years but it may also occur in older children. Also known as primary mediastinal B-cell lymphoma.
  primary myelofibrosis: (PRY-mayr-ee MY-eh-loh-fy-BROH-sis)
    Pronunciation of dictionary term "primary myelofibrosis"
    A progressive, chronic disease in which the bone marrow is replaced by fibrous tissue and blood is made in organs such as the liver and the spleen, instead of in the bone marrow. This disease is marked by an enlarged spleen and progressive anemia. Also called agnogenic myeloid metaplasia, chronic idiopathic myelofibrosis, idiopathic myelofibrosis, and myelosclerosis with myeloid metaplasia.
  primary ovarian insufficiency: (PRY-mayr-ee oh-VAYR-ee-un IN-suh-FIH-shen-see)
    Pronunciation of dictionary term "primary ovarian insufficiency"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. Primary ovarian insufficiency means the ovaries do not function normally. This may be because they have been removed by surgery, or it may be caused by some cancer treatments and certain diseases or genetic conditions. Some women with primary ovarian insufficiency sometimes have menstrual periods and may be able to have children. Also called premature ovarian failure.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  primary peritoneal cancer: (PRY-mayr-ee PAYR-ih-toh-NEE-ul KAN-ser)
    Pronunciation of dictionary term "primary peritoneal cancer"
    Cancer that forms in the peritoneum (the tissue that lines the abdominal wall and covers organs in the abdomen), and has not spread there from another part of the body. Primary peritoneal cancer sometimes spreads to the ovary. It is similar to ovarian epithelial cancer and is staged and treated the same way.
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
  primary renal myoepithelial carcinoma: (PRY-mayr-ee REE-nul MY-oh-eh-pih-THEE-lee-ul KAR-sih-NOH-muh)
    Pronunciation of dictionary term "primary renal myoepithelial carcinoma"
    A rare type of cancer that forms in the kidney. Primary renal myoepithelial carcinoma often grows quickly and spreads to other parts of the body, especially in children. The cancer cells may have a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome).
  primary therapy: (PRY-mayr-ee THAYR-uh-pee)
    Pronunciation of dictionary term "primary therapy"
    The first treatment given for a disease. It is often part of a standard set of treatments, such as surgery followed by chemotherapy and radiation. When used by itself, primary therapy is the one accepted as the best treatment. If it doesn’t cure the disease or it causes severe side effects, other treatment may be added or used instead. Also called first-line therapy, induction therapy, and primary treatment.
  primary treatment: (PRY-mayr-ee TREET-ment)
    Pronunciation of dictionary term "primary treatment"
    The first treatment given for a disease. It is often part of a standard set of treatments, such as surgery followed by chemotherapy and radiation. When used by itself, primary treatment is the one accepted as the best treatment. If it doesn’t cure the disease or it causes severe side effects, other treatment may be added or used instead. Also called first-line therapy, induction therapy, and primary therapy.
  primary tumor: (PRY-mayr-ee TOO-mer)
    Pronunciation of dictionary term "primary tumor"
    A term used to describe the original, or first, tumor in the body. Cancer cells from a primary tumor may spread to other parts of the body and form new, or secondary, tumors. This is called metastasis. These secondary tumors are the same type of cancer as the primary tumor. Also called primary cancer.
  primitive neuroectodermal tumor: (PRIH-muh-tiv NOOR-oh-EK-toh-DER-mul TOO-mer)
    Pronunciation of dictionary term "primitive neuroectodermal tumor"
    One of a group of cancers that develop from the same type of early cells, and share certain biochemical and genetic features. Some primitive neuroectodermal tumors develop in the brain and central nervous system (CNS-PNET), and others develop in sites outside of the brain such as the limbs, pelvis, and chest wall (peripheral PNET). Also called PNET.
  principal investigator: (PRIN-sih-pul in-VES-tih-GAY-ter)
    Pronunciation of dictionary term "principal investigator"
    The person(s) in charge of a clinical trial or a scientific research grant. The principal investigator prepares and carries out the clinical trial protocol (plan for the study) or research paid for by the grant. The principal investigator also analyzes the data and reports the results of the trial or grant research. Also called PI.
  Prinivil: (PRIH-nih-vil)
    Pronunciation of dictionary term "Prinivil"
    A drug used to treat high blood pressure and certain heart conditions. It is also being studied in the prevention and treatment of side effects caused by some anticancer drugs. It blocks certain enzymes that cause blood vessels to constrict (narrow). It is a type of angiotensin-converting enzyme (ACE) inhibitor. Also called lisinopril and Zestril.
  prinomastat: (prih-NOH-muh-stat)
    Pronunciation of dictionary term "prinomastat"
    A substance that is being studied in the treatment of cancer. It is a matrix metalloproteinase inhibitor and belongs to the family of drugs called angiogenesis inhibitors. Also called AG3340.
  PRO: Information about a patient’s health that comes directly from the patient. Examples of PROs include a patient’s description of their symptoms, their satisfaction with care, and how a disease or treatment affects their physical, mental, emotional, spiritual, and social well-being. In clinical trials, PROs may provide information about the side effects of the new treatment being studied. The use of patient-reported outcomes may help plan the best treatment and improve quality of care. Also called patient-reported outcome.
  pro-oxidant: (proh-OK-sih-dunt)
    Pronunciation of dictionary term "pro-oxidant"
    A substance that can produce oxygen byproducts of metabolism that can cause damage to cells.
  proband: (PROH-band)
    Pronunciation of dictionary term "proband"
    The first person in a family to be identified as possibly having a genetic disorder and who may receive genetic counseling or testing. The person may have a condition that is thought to be inherited or may be concerned about the risk of developing a genetic condition or passing it to a child.
    More Information
    - Proband (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=164)
  probenecid: (proh-BEH-neh-sid)
    Pronunciation of dictionary term "probenecid"
    A drug that is used to treat gout and is used together with some antibiotics to make them work better. It is being studied in the treatment of cancer. It belongs to the family of drugs called antibiotic therapy adjuncts.
  probiotic: (PROH-by-AH-tik)
    Pronunciation of dictionary term "probiotic"
    A live microorganism used as a dietary supplement to help with digestion and normal bowel function. It may also help keep the gastrointestinal (GI) tract healthy. A bacterium found in yogurt called Lactobacillus acidophilus, is the most common probiotic.
  procarbazine: (proh-KAR-buh-zeen)
    Pronunciation of dictionary term "procarbazine"
    The active ingredient in a drug used with other drugs to treat advanced Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Procarbazine damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent.
  procarbazine hydrochloride: (proh-KAR-buh-zeen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "procarbazine hydrochloride"
    A drug used with other drugs to treat advanced Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Procarbazine hydrochloride damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Procarbazine is the active ingredient of procarbazine hydrochloride. Also called Matulane.
    More Information
    - Procarbazine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/procarbazinehydrochloride)
  prochlorperazine: (PROH-klor-PAYR-uh-zeen)
    Pronunciation of dictionary term "prochlorperazine"
    A drug used to prevent or reduce nausea and vomiting. It belongs to the family of drugs called antiemetics.
  Procrit: (PROH-krit)
    Pronunciation of dictionary term "Procrit"
    A drug used to treat anemia caused by chronic kidney disease, some types of chemotherapy, and an antiviral drug for HIV infection called zidovudine. It is also used to lower the number of donor blood transfusions needed during and after certain types of surgery. Procrit is a form of erythropoietin (a substance naturally made by the kidneys) that is made in the laboratory. It helps the bone marrow make more red blood cells. Procrit is a type of antianemic and a type of erythropoiesis-stimulating agent. Also called epoetin alfa, Epogen, and Retacrit.
    More Information
    - Epoetin Alfa (https://www.cancer.gov/about-cancer/treatment/drugs/epoetinalfa)
  proctitis: (prok-TY-tis)
    Pronunciation of dictionary term "proctitis"
    Inflammation of the mucous membrane that lines the rectum (the last several inches of the large intestine closest to the anus). Also called rectitis.
  proctoscope: (PROK-toh-skope)
    Pronunciation of dictionary term "proctoscope"
    A thin, tube-like instrument used to look inside the anus and rectum. A proctoscope has a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
  proctoscopy: (prok-TOS-koh-pee)
    Pronunciation of dictionary term "proctoscopy"
    A procedure that uses a proctoscope to look inside the anus and rectum. A proctoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
  proctosigmoidoscopy: (PROK-toh-sig-moy-DOS-koh-pee)
    Pronunciation of dictionary term "proctosigmoidoscopy"
    Examination of the lower colon using a sigmoidoscope, inserted into the rectum. A sigmoidoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. Also called sigmoidoscopy.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    Sigmoidoscopy. A thin, lighted tube is inserted through the anus and rectum and into the lower part of the colon to look for abnormal areas.
    Sigmoidoscopy; drawing shows a sigmoidoscope inserted through the anus and rectum and into the sigmoid colon. An inset shows a patient lying on a table having a sigmoidoscopy.
  progeny: (PRAH-jeh-nee)
    Pronunciation of dictionary term "progeny"
    Offspring; the product of reproduction or replication.
  progesterone: (proh-JES-teh-rone)
    Pronunciation of dictionary term "progesterone"
    A type of hormone made by the body that plays a role in the menstrual cycle and pregnancy. Progesterone can also be made in the laboratory. It may be used as a type of birth control and to treat menstrual disorders, infertility, symptoms of menopause, and other conditions.
  progesterone receptor: (proh-JES-teh-rone reh-SEP-ter)
    Pronunciation of dictionary term "progesterone receptor"
    A protein found inside the cells of the female reproductive tissue, some other types of tissue, and some cancer cells. The hormone progesterone will bind to the receptors inside the cells and may cause the cells to grow. Also called PR.
  progesterone receptor negative: (proh-JES-teh-rone reh-SEP-ter NEH-guh-tiv)
    Pronunciation of dictionary term "progesterone receptor negative"
    Describes cells that do not have a protein that binds to the hormone progesterone. Cancer cells that are progesterone receptor negative do not need progesterone to grow. This means that they will keep growing when progesterone is not present and do not stop growing when treated with substances that block progesterone from binding. Also called PR negative.
  progesterone receptor positive: (proh-JES-teh-rone reh-SEP-ter PAH-zih-tiv)
    Pronunciation of dictionary term "progesterone receptor positive"
    Describes cells that have a protein that binds to the hormone progesterone. Cancer cells that are progesterone receptor positive may need progesterone to grow. These cells may stop growing or die when treated with substances that block the binding and actions of progesterone. Also called PR positive.
  progesterone receptor test: (proh-JES-teh-rone reh-SEP-ter test)
    Pronunciation of dictionary term "progesterone receptor test"
    A lab test to find out if cancer cells have progesterone receptors (proteins to which the hormone progesterone will bind). If the cells have progesterone receptors, they may need progesterone to grow, and this can affect how the cancer is treated.
  progestin: (proh-JES-tin)
    Pronunciation of dictionary term "progestin"
    Any natural or laboratory-made substance that has some or all of the biologic effects of progesterone, a female hormone.
  prognosis: (prog-NO-sis)
    Pronunciation of dictionary term "prognosis"
    The likely outcome or course of a disease; the chance of recovery or recurrence.
    More Information
    - Understanding Cancer Prognosis (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis)
  prognostic factor: (prog-NOS-tik FAK-ter)
    Pronunciation of dictionary term "prognostic factor"
    A situation or condition, or a characteristic of a patient, that can be used to estimate the chance of recovery from a disease or the chance of the disease recurring (coming back).
  programmed cell death: (PROH-gramd sel deth)
    Pronunciation of dictionary term "programmed cell death"
    A type of cell death in which a series of molecular steps in a cell lead to its death. This is one method the body uses to get rid of unneeded or abnormal cells. The process of programmed cell death may be blocked in cancer cells. Also called apoptosis.
  progression: (pruh-GREH-shun)
    Pronunciation of dictionary term "progression"
    In medicine, the course of a disease, such as cancer, as it becomes worse or spreads in the body.
  progression-free survival: (pruh-GREH-shun ... ser-VY-vul)
    Pronunciation of dictionary term "progression-free survival"
    The length of time during and after the treatment of a disease, such as cancer, that a patient lives with the disease but it does not get worse. In a clinical trial, measuring the progression-free survival is one way to see how well a new treatment works. Also called PFS.
  progressive disease: (pruh-GREH-siv dih-ZEEZ)
    Pronunciation of dictionary term "progressive disease"
    Cancer that is growing, spreading, or getting worse.
  progressive familial intrahepatic cholestasis: (pruh-GREH-siv fuh-MIH-lee-ul IN-truh-heh-PA-tik koh-leh-STAY-sis)
    Pronunciation of dictionary term "progressive familial intrahepatic cholestasis"
    A rare, inherited disorder marked by a buildup in the liver of bile (fluid that helps digest fat). This can lead to liver disease and liver failure. It may also increase the risk of liver cancer. Progressive familial intrahepatic cholestasis is caused by mutations (changes) in certain genes that make proteins needed to help the liver work the way it should. It usually occurs in infants and children. Also called PFIC.
    More Information
    - Progressive familial intrahepatic cholestasis (MedlinePlus) (https://medlineplus.gov/genetics/condition/progressive-familial-intrahepatic-cholestasis/)
    - Progressive familial intrahepatic cholestasis 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/9802/progressive-familial-intrahepatic-cholestasis)
  prolactin: (proh-LAK-tin)
    Pronunciation of dictionary term "prolactin"
    A hormone that is made by the pituitary gland (a pea-sized organ in the center of the brain). Prolactin causes a woman’s breasts to make milk during and after pregnancy, and has many other effects in the body.
  Proleukin: (proh-LOO-kin)
    Pronunciation of dictionary term "Proleukin"
    A drug used to treat adults with melanoma or renal cell carcinoma (a type of kidney cancer) that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Proleukin is a form of interleukin-2 that is made in the laboratory. Proleukin increases the activity and growth of white blood cells called T lymphocytes and B lymphocytes, which may help the immune system kill cancer cells. Proleukin is a type of cytokine and a type of immunomodulating agent. Also called aldesleukin and recombinant human interleukin-2.
    More Information
    - Aldesleukin (https://www.cancer.gov/about-cancer/treatment/drugs/aldesleukin)
  Prolia: (PROH-lee-uh)
    Pronunciation of dictionary term "Prolia"
    A drug that contains the active ingredient denosumab and is used to treat certain bone problems. Prolia is used to increase bone mass in certain patients with breast cancer or prostate cancer who have a high risk of breaking bones. It is also used to treat osteoporosis in certain patients who have a high risk of breaking bones. Prolia binds to a protein called RANKL, which keeps RANKL from binding to another protein called RANK on the surface of certain bone cells. This may help keep bone from breaking down. Prolia is a type of monoclonal antibody.
    More Information
    - Denosumab (https://www.cancer.gov/about-cancer/treatment/drugs/denosumab)
  proliferating: (proh-LIH-feh-RAY-ting)
    Pronunciation of dictionary term "proliferating"
    Multiplying or increasing in number. In biology, cell proliferation occurs by a process known as cell division.
  proliferative index: (proh-LIH-feh-ruh-tiv ...)
    Pronunciation of dictionary term "proliferative index"
    A measure of the number of cells in a tumor that are dividing (proliferating). May be used with the S-phase fraction to give a more complete understanding of how fast a tumor is growing.
  prolymphocytic leukemia: (proh-LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "prolymphocytic leukemia"
    A type of chronic lymphocytic leukemia (CLL), in which too many immature white blood cells (prolymphocytes) are found in the blood and bone marrow. Prolymphocytic leukemia usually progresses more rapidly than classic CLL. Also called PLL.
  Promacta: (proh-MAK-tuh)
    Pronunciation of dictionary term "Promacta"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults and children with chronic immune thrombocytopenic purpura that did not get better with other treatment. Promacta is also used to treat severe aplastic anemia. It is also being studied in the treatment of other conditions and types of cancer. Promacta binds to the thrombopoietin receptor, which causes the bone marrow to make more platelets. It is a type of thrombopoietin receptor agonist. Also called eltrombopag olamine.
    More Information
    - Eltrombopag Olamine (https://www.cancer.gov/about-cancer/treatment/drugs/eltrombopagolamine)
  promegapoietin: (proh-MEH-guh-POY-eh-tin)
    Pronunciation of dictionary term "promegapoietin"
    A drug given during chemotherapy to increase blood cell regeneration. Promegapoietin is a colony-stimulating factor that stimulates the production of blood cells, especially platelets. It is a cytokine and belongs to the family of drugs called hematopoietic (blood-forming) agents.
  ProMune: (PROH-myoon)
    Pronunciation of dictionary term "ProMune"
    A substance that is being studied in the treatment of some types of cancer. It belongs to the family of drugs called biological response modifiers. Also called CpG 7909 and PF-3512676.
  promyelocytic leukemia: (proh-MY-eh-loh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "promyelocytic leukemia"
    An aggressive (fast-growing) type of acute myeloid leukemia in which there are too many immature blood-forming cells in the blood and bone marrow. It is usually marked by an exchange of parts of chromosomes 15 and 17. Also called acute promyelocytic leukemia and APL.
  promyelocytic leukemia gene: (proh-MY-eh-loh-SIH-tik loo-KEE-mee-uh jeen)
    Pronunciation of dictionary term "promyelocytic leukemia gene"
    A gene that makes a protein that helps control cell growth and cell division. Mutations (changes) in the promyelocytic leukemia gene can occur when a piece of the chromosome containing the promyelocytic leukemia gene breaks off and joins with a gene called RARA on another chromosome. These changes may cause too many immature white blood cells to build up in the blood and bone marrow. This can lead to an aggressive (fast-growing) type of acute myeloid leukemia called acute promyelocytic leukemia. The promyelocytic leukemia gene is a type of tumor suppressor gene. Also called PML gene.
  prophylactic: (PROH-fih-LAK-tik)
    Pronunciation of dictionary term "prophylactic"
    In medicine, something that prevents or protects.
  prophylactic cranial irradiation: (PROH-fih-LAK-tik KRAY-nee-ul ir-RAY-dee-AY-shun)
    Pronunciation of dictionary term "prophylactic cranial irradiation"
    Radiation therapy to the head to reduce the risk that cancer will spread to the brain.
  prophylactic mastectomy: (PROH-fih-LAK-tik ma-STEK-toh-mee)
    Pronunciation of dictionary term "prophylactic mastectomy"
    Surgery to reduce the risk of breast cancer by removing one or both breasts before disease develops. Prophylactic mastectomy may be done in people who have a very high risk of developing breast cancer. Also called preventive mastectomy and risk-reducing mastectomy.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  prophylactic oophorectomy: (PROH-fih-LAK-tik oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "prophylactic oophorectomy"
    Surgery done to reduce the risk of ovarian cancer and breast cancer by removing the ovaries before disease develops. Removing the ovaries lowers the amount of estrogen in the body, which may slow the growth of some types of breast cancer. Prophylactic oophorectomy is usually done in women who have a high risk of developing breast cancer and/or ovarian cancer caused by certain genetic mutations. Also called risk-reducing oophorectomy.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  prophylactic surgery: (PROH-fih-LAK-tik SER-juh-ree)
    Pronunciation of dictionary term "prophylactic surgery"
    Surgery to remove an organ or gland that shows no signs of cancer, in an attempt to prevent development of cancer of that organ or gland. Prophylactic surgery is sometimes chosen by people who know they are at high risk for developing cancer.
  prophylaxis: (PROH-fih-LAK-sis)
    Pronunciation of dictionary term "prophylaxis"
    An attempt to prevent disease.
  propranolol hydrochloride: (proh-PRAN-uh-lol HY-droh-KLOR-ide)
    Pronunciation of dictionary term "propranolol hydrochloride"
    A drug used under the brand name Hemangeol to treat infants 5 weeks to 5 months of age with infantile hemangioma (a benign blood vessel tumor) and under other brand names to treat high blood pressure, including before surgery in patients with pheochromocytoma, and many other conditions. It is also being studied in the treatment of other conditions and some types of cancer. Propranolol hydrochloride blocks certain receptors on nerve cells and causes blood vessels to relax and widen. This improves blood flow and lowers blood pressure and heart rate. Propranolol hydrochloride may also help shrink certain types of vascular tumors. It is a type of beta blocker.
    More Information
    - Propranolol Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/propranolol-hydrochloride)
  prospective: (pruh-SPEK-tiv)
    Pronunciation of dictionary term "prospective"
    In medicine, a study or clinical trial in which participants are identified and then followed forward in time.
  prospective cohort study: (pruh-SPEK-tiv KOH-hort STUH-dee)
    Pronunciation of dictionary term "prospective cohort study"
    A research study that follows over time groups of individuals who are alike in many ways but differ by a certain characteristic (for example, female nurses who smoke and those who do not smoke) and compares them for a particular outcome (such as lung cancer).
  Prost 30: (prost ...)
    Pronunciation of dictionary term "Prost 30"
    A monoclonal antibody that is being studied in the detection and treatment of cancer. Monoclonal antibodies are produced in the laboratory and can locate and bind to cancer cells.
  prostaglandin: (PROS-tuh-GLAN-din)
    Pronunciation of dictionary term "prostaglandin"
    One of several hormone-like substances made by the body. Different prostaglandins control blood pressure, contraction of smooth muscles, and other processes within tissues where they are made. Certain prostaglandins are being studied as cancer biomarkers. Also called PG.
  prostaglandin E1: (PROS-tuh-GLAN-din …)
    Pronunciation of dictionary term "prostaglandin E1"
    A drug that is used to treat impotence (inability to have an erection) and is being studied in the treatment of sexual problems in men who have had surgery for prostate cancer. It is a type of vasodilator. Also called alprostadil and PGE1.
  prostaglandin-endoperoxide synthase 2: (PROS-tuh-GLAN-din-EN-doh-peh-ROK-side SIN-thays 2)
    Pronunciation of dictionary term "prostaglandin-endoperoxide synthase 2"
    An enzyme that speeds up the formation of substances that cause inflammation and pain. It may also cause tumor cells to grow. Some tumors have high levels of prostaglandin-endoperoxide synthase 2 and blocking its activity may reduce tumor growth. Also called COX-2 and cyclooxygenase-2.
  ProstaScint: (PROS-tuh-sint)
    Pronunciation of dictionary term "ProstaScint"
    A substance used to detect prostate cancer. It contains a monoclonal antibody that binds to prostate cells, linked to a substance that can bind radioisotopes. ProstaScint is combined with indium 111 and injected into the body. A gamma camera (a special camera that detects radioactivity) is used to find prostate cancer cells in the body. ProstaScint is a type of immunoconjugate. Also called capromab pendetide.
  ProstaScint scan: (PROS-tuh-sint skan)
    Pronunciation of dictionary term "ProstaScint scan"
    An imaging test used to detect prostate cancer. The patient receives an injection of an indium 111-labeled form of ProstaScint, which contains a monoclonal antibody that binds to prostate cells. A gamma camera (a special camera that detects radioactivity) is used to find prostate cancer cells in the body.
  prostate: (PROS-tayt)
    Pronunciation of dictionary term "prostate"
    A gland in the male reproductive system. The prostate surrounds the part of the urethra (the tube that empties the bladder) just below the bladder, and produces a fluid that forms part of the semen.
    More Information
    - Prostate Cancer (https://www.cancer.gov/types/prostate)
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
    Anatomy of the male reproductive and urinary systems showing the ureters, bladder, prostate gland, urethra, penis, testicles, and other organs.
    Drawing of the male reproductive system and urinary system anatomy showing the front and side views of the ureters, bladder, prostate gland, vas deferens, urethra, penis, and testicles. A side view of the seminal vesicle and ejaculatory duct is also shown. The drawing also shows front and side views of the rectum and lymph nodes in the pelvis.
  prostate cancer: (PROS-tayt KAN-ser)
    Pronunciation of dictionary term "prostate cancer"
    Cancer that forms in the tissues of the prostate (a gland in the male reproductive system that lies just below the bladder and in front of the rectum). Prostate cancer usually occurs in older men.
    More Information
    - Prostate Cancer (https://www.cancer.gov/types/prostate)
    Prostate cancer forms in the tissues of the prostate (a gland in the male reproductive system that lies just below the bladder and in front of the rectum). It is most common in older men.
    Prostate cancer; drawing shows cancer in one side of the prostate. Also shown are the bladder, rectum, and urethra.
  prostate cancer antigen 3 mRNA test: (PROS-tayt KAN-ser AN-tih-jen …)
    Pronunciation of dictionary term "prostate cancer antigen 3 mRNA test"
    A laboratory test that measures the amount of genetic material called PCA3 mRNA and PSA mRNA in the first urine sample after a digital rectal examination. PCA3 mRNA and PSA mRNA are made by normal prostate cells and prostate cancer cells but are made in higher amounts by prostate cancer cells. The PCA3 score is based on the ratio of PCA3 mRNA to PSA mRNA in the urine. A high PCA3 score may be a sign of prostate cancer. The prostate cancer antigen 3 mRNA test may be done in men with a high PSA level whose biopsy of the prostate did not show cancer. The prostate cancer antigen 3 mRNA test is used to help decide if another prostate biopsy may be needed. Also called PCA3 mRNA test.
  prostate-specific antigen: (PROS-tayt-speh-SIH-fik AN-tih-jen)
    Pronunciation of dictionary term "prostate-specific antigen"
    A protein made by the prostate gland and found in the blood. Prostate-specific antigen blood levels may be higher than normal in men who have prostate cancer, benign prostatic hyperplasia (BPH), or infection or inflammation of the prostate gland. Also called PSA.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  prostate-specific antigen test: (PROS-tayt-speh-SIH-fik AN-tih-jen ...)
    Pronunciation of dictionary term "prostate-specific antigen test"
    A laboratory test that measures the amount of prostate-specific antigen (PSA) found in the blood. PSA is a protein made by the prostate gland. The amount of PSA may be higher in men who have prostate cancer, benign prostatic hyperplasia (BPH), or infection or inflammation of the prostate. Also called PSA test.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  prostate-specific membrane antigen: (PROS-tayt-speh-SIH-fik MEM-brayn AN-tih-jen)
    Pronunciation of dictionary term "prostate-specific membrane antigen"
    A protein that is usually found on the surface of normal prostate cells but is found in higher amounts on prostate cancer cells. Prostate-specific membrane antigen may be used as a target in imaging to help find prostate cancer cells, especially those that may have come back or spread to other parts of the body. Research is being done to learn more about prostate-specific membrane antigen and how it may also be used as a target for certain anticancer drugs. Also called PSMA.
  prostate-specific membrane antigen PET scan: (PROS-tayt-speh-SIH-fik MEM-brayn AN-tih-jen … skan)
    Pronunciation of dictionary term "prostate-specific membrane antigen PET scan"
    An imaging procedure that is used to help find prostate cancer cells in the body. For this procedure, a cell-targeting molecule linked to a radioactive substance is injected into the body and travels through the blood. It attaches to a protein called prostate-specific membrane antigen (PSMA) that is found on the surface of prostate cancer cells. A PET scanner detects high concentrations of the radioactive molecule and shows where the prostate cancer cells are in the body. A prostate-specific membrane antigen PET scan may be used to help diagnose prostate cancer that may have come back or spread to other parts of the body. It may also be used to help plan treatment. Also called PSMA PET scan.
  prostatectomy: (PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "prostatectomy"
    Surgery to remove part or all of the prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). Nearby lymph nodes may also be removed. A prostatectomy may be done through an incision (cut) made in the wall of the lower abdomen or in the perineum (the area between the scrotum and anus). It may also be done using a laparoscope (a thin, tube-like instrument with a light and lens for viewing) or a special robotic system. An attempt is made to protect the nerves that control penile erection and the bladder from damage.
  prostatic acid phosphatase: (prah-STA-tik A-sid FOS-fuh-tays)
    Pronunciation of dictionary term "prostatic acid phosphatase"
    An enzyme produced by the prostate. It may be found in increased amounts in men who have prostate cancer. Also called PAP.
  prostatic intraepithelial neoplasia: (prah-STA-tik IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "prostatic intraepithelial neoplasia"
    Noncancerous growth of the cells lining the internal and external surfaces of the prostate gland. Having high-grade prostatic intraepithelial neoplasia may increase the risk of developing prostate cancer. Also called PIN.
  prostatitis: (PROS-tuh-TY-tis)
    Pronunciation of dictionary term "prostatitis"
    Inflammation of the prostate gland.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  prostatocystectomy: (PROS-tuh-toh-sis-TEK-toh-mee)
    Pronunciation of dictionary term "prostatocystectomy"
    Surgery to remove the bladder and the prostate. The seminal vesicles and nearby lymph nodes may also be removed. The prostate and seminal vesicles are glands in the male reproductive system that help make semen. Also called cystoprostatectomy.
  prosthesis: (pros-THEE-sis)
    Pronunciation of dictionary term "prosthesis"
    A device, such as an artificial leg, that replaces a part of the body.
  prosthetist: (PROS-theh-tist)
    Pronunciation of dictionary term "prosthetist"
    A person who has special training in making and fitting artificial body parts, such as arms or legs.
  prosthodontist: (pros-thoh-DON-tist)
    Pronunciation of dictionary term "prosthodontist"
    A dentist who has special training in replacing missing teeth or other structures of the mouth to restore an individual’s appearance, comfort, or health.
  prostration: (prah-STRAY-shun)
    Pronunciation of dictionary term "prostration"
    A condition in which a person is so tired or weak that he or she is unable to do anything.
  protease inhibitor: (PROH-tee-ays in-HIH-bih-ter)
    Pronunciation of dictionary term "protease inhibitor"
    A compound that interferes with the ability of certain enzymes to break down proteins. Some protease inhibitors can keep a virus from making copies of itself (for example, AIDS virus protease inhibitors), and some can prevent cancer cells from spreading.
  proteasome inhibitor: (PROH-tee-uh-some in-HIH-bih-ter)
    Pronunciation of dictionary term "proteasome inhibitor"
    A drug that blocks the action of proteasomes. A proteasome is a large protein complex that helps destroy other cellular proteins when they are no longer needed. Proteasome inhibitors are being studied in the treatment of cancer.
  Protection of Human Subjects: (proh-TEK-shun ... HYOO-mun SUB-jekts)
    Pronunciation of dictionary term "Protection of Human Subjects"
    Laws set by the U.S. Department of Health and Human Services (DHHS) to protect a person from risks in research studies that any federal agency or department has a part in. Also called 45 CFR 46, 45 Code of Federal Regulations Part 46, and human participant protection regulations.
  protective factor: (proh-TEK-tiv FAK-ter)
    Pronunciation of dictionary term "protective factor"
    Something that may decrease the chance of getting a certain disease. Some examples of protective factors for cancer are getting regular physical activity, staying at a healthy weight, and having a healthy diet.
  protegrin: (proh-TEH-grin)
    Pronunciation of dictionary term "protegrin"
    One of a family of small proteins found in white blood cells in pigs. Protegrins kill certain bacteria, fungi, and viruses by making holes in their outer membranes and causing them to burst. A protegrin is a type of antimicrobial peptide.
  protein: (PROH-teen)
    Pronunciation of dictionary term "protein"
    A molecule made up of amino acids. Proteins are needed for the body to function properly. They are the basis of body structures, such as skin and hair, and of other substances such as enzymes, cytokines, and antibodies.
  protein expression: (PROH-teen ek-SPREH-shun)
    Pronunciation of dictionary term "protein expression"
    Refers to the production of proteins by cells. The study of protein expression in cancer cells may give information about a specific type of cancer, the best treatment to use, and how well a treatment works.
  protein expression profile: (PROH-teen ek-SPREH-shun PROH-file)
    Pronunciation of dictionary term "protein expression profile"
    Information about all proteins that are made in blood, other body fluids, or tissues, at certain times. A protein expression profile may be used to find and diagnose a disease or condition and to see how well the body responds to treatment. Also called protein signature and proteomic profile.
  protein kinase B: (PROH-teen KY-nays …)
    Pronunciation of dictionary term "protein kinase B"
    A group of enzymes involved in several processes related to cell growth and survival. Protein kinase B enzymes help to transfer signals inside cells. A protein kinase B enzyme is a type of serine/threonine protein kinase. Also called Akt.
  protein kinase C: (PROH-teen KY-nays ...)
    Pronunciation of dictionary term "protein kinase C"
    An enzyme found throughout the body's tissues and organs. Several forms of protein kinase C are involved in many cellular functions. Protein kinase C is being studied in the treatment of cancer. Also called PKC.
  protein kinase inhibitor: (PROH-teen KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "protein kinase inhibitor"
    A substance that blocks the action of enzymes called protein kinases. There are many different types of protein kinases and they take part in many cell functions. These include cell signaling, growth, and division. Blocking certain protein kinases may help keep cancer cells from growing. Some protein kinase inhibitors, such as imatinib, vemurafenib, and gefitinib, are used to treat cancer.
  protein signature: (PROH-teen SIG-nuh-cher)
    Pronunciation of dictionary term "protein signature"
    Information about all proteins that are made in blood, other body fluids, or tissues, at certain times. A protein signature may be used to find and diagnose a disease or condition and to see how well the body responds to treatment. Also called protein expression profile and proteomic profile.
  protein-bound paclitaxel: (PROH-teen-bownd PA-klih-TAK-sil)
    Pronunciation of dictionary term "protein-bound paclitaxel"
    A form of the anticancer drug paclitaxel that is used alone or with other drugs to treat certain types of breast cancer, non-small cell lung cancer, and pancreatic cancer. Protein-bound paclitaxel may have fewer side effects and work better than other forms of paclitaxel. It is also being studied in the treatment of other types of cancer. Protein-bound paclitaxel stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called ABI-007, Abraxane, nanoparticle paclitaxel, and paclitaxel albumin-stabilized nanoparticle formulation.
    More Information
    - Paclitaxel Albumin-stabilized Nanoparticle Formulation (https://www.cancer.gov/about-cancer/treatment/drugs/nanoparticlepaclitaxel)
  proteinuria: (PROH-teen-YOOR-ee-uh)
    Pronunciation of dictionary term "proteinuria"
    Higher-than-normal amount of protein in the urine.
  proteogenomics: (PROH-tee-oh-jeh-NOH-mix)
    Pronunciation of dictionary term "proteogenomics"
    The study of how information about the DNA in a cell or organism relates to the proteins made by that cell or organism. This includes understanding how genes control when proteins get made and what changes occur to proteins after they are made that may switch them on and off. Proteogenomics may help researchers learn more about which proteins are involved in certain diseases, such as cancer, and may also be used to help develop new drugs that block these proteins.
  proteoglycan: (PROH-tee-oh-GLY-kan)
    Pronunciation of dictionary term "proteoglycan"
    A molecule that contains both protein and glycosaminoglycans, which are a type of polysaccharide. Proteoglycans are found in cartilage and other connective tissues.
  proteome: (PROH-tee-ome)
    Pronunciation of dictionary term "proteome"
    The complete set of proteins made by an organism. Proteins are made in different amounts and at different times, depending on how they work, when they are needed, and how they interact with other proteins inside cells. Information about a proteome may be used to help find which proteins are involved in diseases, such as cancer. It may also be used to help develop drugs that block these proteins.
  proteomic profile: (PROH-tee-OH-mik PROH-file)
    Pronunciation of dictionary term "proteomic profile"
    Information about all proteins that are made in blood, other body fluids, or tissues, at certain times. A proteomic profile may be used to find and diagnose a disease or condition and to see how well the body responds to treatment. Also called protein expression profile and protein signature.
  proteomics: (proh-tee-OH-mix)
    Pronunciation of dictionary term "proteomics"
    The study of the structure and function of proteins, including the way they work and interact with each other inside cells.
  proto-oncogene: (PROH-toh-ON-koh-jeen)
    Pronunciation of dictionary term "proto-oncogene"
    A gene involved in normal cell growth. Mutations (changes) in a proto-oncogene may cause it to become an oncogene, which can cause the growth of cancer cells.
  Protocel: (PROH-toh-sel)
    Pronunciation of dictionary term "Protocel"
    A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in Protocel have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give Protocel as a treatment for any disease. Also called 126–F, Cancell, Cantron, Jim’s Juice, JS–101, JS–114, and Sheridan’s Formula.
    More Information
    - Cancell/Cantron/Protocel
  protocol: (PROH-tuh-KOL)
    Pronunciation of dictionary term "protocol"
    A detailed plan of a scientific or medical experiment, treatment, or procedure. In clinical trials, it states what the study will do, how it will be done, and why it is being done. It explains how many people will be in the study, who is eligible to take part in it, what study drugs or other interventions will be given, what tests will be done and how often, and what information will be collected.
  proton: (PROH-ton)
    Pronunciation of dictionary term "proton"
    A small, positively charged particle of matter found in the atoms of all elements. Streams of protons generated by special equipment can be used for radiation treatment.
  proton beam radiation therapy: (PROH-ton beem RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "proton beam radiation therapy"
    A type of radiation therapy that uses streams of protons (tiny particles with a positive charge) to kill tumor cells. This type of treatment can reduce the amount of radiation damage to healthy tissue near a tumor. It is used to treat cancers of the head and neck and organs such as the brain, eye, lung, spine, and prostate. Proton beam radiation is different from x-ray radiation.
  proton magnetic resonance spectroscopic imaging: (PROH-ton mag-NEH-tik REH-zuh-nunts SPEK-troh-SKAH-pik IH-muh-jing)
    Pronunciation of dictionary term "proton magnetic resonance spectroscopic imaging"
    A noninvasive imaging method that provides information about cellular activity (metabolic information). It is used along with magnetic resonance imaging (MRI) which provides information about the shape and size of the tumor (spatial information). Also called 1H-nuclear magnetic resonance spectroscopic imaging, magnetic resonance spectroscopic imaging, and MRSI.
  proton pump inhibitor: (PROH-ton … in-HIH-bih-ter)
    Pronunciation of dictionary term "proton pump inhibitor"
    A substance used to treat certain disorders of the stomach and intestines, such as heartburn and ulcers. Proton pump inhibitors block the actions of an enzyme in the stomach and reduce the amount of acid made in the stomach. Also called PPI.
  protozoal: (PROH-tuh-ZOH-ul)
    Pronunciation of dictionary term "protozoal"
    Having to do with the simplest organisms in the animal kingdom. Protozoa are single-cell organisms, such as ameba, and are different from bacteria, which are not members of the animal kingdom. Some protozoa can be seen without a microscope.
  Provenge: (PROH-venj)
    Pronunciation of dictionary term "Provenge"
    A vaccine used to treat prostate cancer that has spread to other parts of the body. It is used in patients who have few or no symptoms and whose cancer is castration resistant (has not responded to treatments that lower testosterone levels). Provenge is made from a patient’s immune cells that have been treated in the laboratory with GM-CSF (a type of growth factor) and a protein found on prostate cancer cells. Provenge may help the immune system kill prostate cancer cells. It is a type of autologous cellular immunotherapy and a type of dendritic cell vaccine. Also called APC 8015 and sipuleucel-T.
    More Information
    - Sipuleucel-T (https://www.cancer.gov/about-cancer/treatment/drugs/sipuleucel-T)
  proximal: (PROK-sih-mul)
    Pronunciation of dictionary term "proximal"
    In medicine, refers to a part of the body that is closer to the center of the body than another part. For example, the knee is proximal to the toes. The opposite is distal.
  proximal colon: (PROK-sih-mul KOH-lun)
    Pronunciation of dictionary term "proximal colon"
    The first and middle parts of the colon. The proximal colon includes the cecum (a pouch that connects the small intestine to the colon), the ascending colon (the right side of the colon), and the transverse colon (the part of the colon that goes across the body between the right and left sides of the colon).
    The proximal colon includes the transverse colon, ascending colon, and the cecum.
    Proximal colon; drawing shows parts of the proximal colon, including the transverse colon, ascending colon, and cecum.
  proximal urethra: (PROK-sih-mul yoo-REE-thruh)
    Pronunciation of dictionary term "proximal urethra"
    The part of the urethra closest to the inside of the body. The urethra is the tube through which urine leaves the body. In women, the proximal urethra is the part near the bladder and in men it is the part that goes through the prostate gland.
    Anatomy of the distal and proximal urethra. Urine flows out of the bladder and leaves the body through the urethra. The part of the urethra that is closest to the bladder is called the proximal urethra. The part that is closest to where the urine leaves the body is called the distal urethra. The urethra is about 8 inches long in men and about 1½ inches long in women.
    Distal and proximal urethra. Drawing on the left shows the female proximal and distal urethra; also shown are the bladder filled with urine, the ureters, and the uterus. Cross-section drawing on the right shows the male proximal and distal urethra. Also shown are the rectum, prostate gland, penis, and testis.
  proximal urethral cancer: (PROK-sih-mul yoo-REE-thrul KAN-ser)
    Pronunciation of dictionary term "proximal urethral cancer"
    A rare cancer that forms in the part of the urethra closest to the inside of the body. The cancer often has spread deeply into the tissue.
  Proxinium: (prok-SIH-nee-um)
    Pronunciation of dictionary term "Proxinium"
    A substance being studied in the treatment of certain types of head and neck cancer. Proxinium is made by linking a monoclonal antibody fragment to a toxic protein that may kill cancer cells. It binds to EpCAM (a protein on the surface of epithelial cells and some types of cancer cells). Also called anti-EpCAM-Pseudomonas-exotoxin fusion protein and VB4-845.
  PRRT: A type of radiation therapy used to treat certain types of neuroendocrine tumors. A radioactive chemical is linked to a peptide (small protein) that targets cancer cells. When this radioactive peptide is injected into the body, it binds to a specific receptor found on some cancer cells. The radioactive peptide builds up in these cells and helps kill the cancer cells without harming normal cells. PRRT is a type of targeted therapy. Also called peptide receptor radionuclide therapy.
  pruritus: (proo-RY-tus)
    Pronunciation of dictionary term "pruritus"
    Itching. Severe itching may be a side effect of some cancer treatments and a symptom of some types of cancers.
    More Information
    - Pruritus
    - Skin and Nail Changes during Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/skin-nail-changes)
  PS-341: A drug used to treat adults with multiple myeloma or mantle cell lymphoma. It is also being studied in the treatment of other types of cancer. PS-341 blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called bortezomib and Velcade.
    More Information
    - Bortezomib (https://www.cancer.gov/about-cancer/treatment/drugs/bortezomib)
  PSA: A protein made by the prostate gland and found in the blood. PSA blood levels may be higher than normal in men who have prostate cancer, benign prostatic hyperplasia (BPH), or infection or inflammation of the prostate gland. Also called prostate-specific antigen.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  PSA bounce: (… bownts)
    Pronunciation of dictionary term "PSA bounce"
    A brief rise and then fall in the blood level of PSA (prostate-specific antigen) that occurs in some patients 1-3 years after receiving radiation treatment for prostate cancer. PSA bounce does not mean that the cancer has come back. It may be caused by the release of PSA from destroyed cancer cells or from normal prostate tissue exposed to the radiation treatment.
  PSA failure: (...FAYL-yer)
    Pronunciation of dictionary term "PSA failure"
    A rise in the blood level of PSA (prostate-specific antigen) in prostate cancer patients after treatment with surgery or radiation. PSA failure may occur in patients who do not have symptoms. It may mean that the cancer has come back. Also called biochemical recurrence and biochemical relapse.
  PSA test: (… test)
    Pronunciation of dictionary term "PSA test"
    A laboratory test that measures the amount of prostate-specific antigen (PSA) found in the blood. PSA is a protein made by the prostate gland. The amount of PSA may be higher in men who have prostate cancer, benign prostatic hyperplasia (BPH), or infection or inflammation of the prostate. Also called prostate-specific antigen test.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  PSA velocity: (… veh-LAH-sih-tee)
    Pronunciation of dictionary term "PSA velocity"
    A measurement of how fast PSA levels in the blood increase over time. A high PSA velocity may be a sign of prostate cancer and may help find fast-growing prostate cancers.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  psammoma body: (sam-OH-muh BAH-dee)
    Pronunciation of dictionary term "psammoma body"
    A structure found in some benign (not cancer) or malignant (cancer) tumor cells. Psammoma bodies look like hardened concentric rings when viewed under a microscope. They can be a sign of chronic inflammation.
  PSC 833: A substance that is being studied for its ability to prevent or overcome the resistance of tumor cells to some anticancer drugs. It belongs to the family of drugs called cyclosporine analogs.
  pseudomyogenic hemangioendothelioma: (SOO-doh-MY-oh-JEH-nik hee-MAN-jee-oh-EN-doh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "pseudomyogenic hemangioendothelioma"
    A very rare blood vessel tumor that usually forms on or under the skin of the arms or legs, but it may also form in deeper tissues, such as muscle and bone. These tumors may spread to nearby tissue, but usually do not spread to other parts of the body. There is often more than one tumor, and the tumor may cause pain in the affected area. Pseudomyogenic hemangioendotheliomas may come back after treatment. They are most common in young adult males. Pseudomyogenic hemangioendotheliomas are a type of vascular tumor.
  pseudomyxoma peritonei: (SOO-doh-mik-SOH-muh PAYR-ih-TOH-ny)
    Pronunciation of dictionary term "pseudomyxoma peritonei"
    A build-up of mucus in the peritoneal cavity. The mucus may come from ruptured ovarian cysts, from the appendix, or from other abdominal tissues. Mucus-secreting cells may attach to the peritoneal lining and continue to secrete mucus.
  psilocybin: (SY-loh-SY-bin)
    Pronunciation of dictionary term "psilocybin"
    A substance being studied in the treatment of anxiety or depression in patients with advanced cancer. It is taken from the mushroom Psilocybe mexicana. Psilocybin acts on the brain to cause hallucinations (sights, sounds, smells, tastes, or touches that a person believes to be real but are not real). Also called psilocybine.
  psilocybine: (SY-loh-SY-bin)
    Pronunciation of dictionary term "psilocybine"
    A substance being studied in the treatment of anxiety or depression in patients with advanced cancer. It is taken from the mushroom Psilocybe mexicana. Psilocybine acts on the brain to cause hallucinations (sights, sounds, smells, tastes, or touches that a person believes to be real but are not real). Also called psilocybin.
  PSMA: A protein that is usually found on the surface of normal prostate cells but is found in higher amounts on prostate cancer cells. PSMA may be used as a target in imaging to help find prostate cancer cells, especially those that may have come back or spread to other parts of the body. Research is being done to learn more about PSMA and how it may also be used as a target for certain anticancer drugs. Also called prostate-specific membrane antigen.
  PSMA PET scan: (… skan)
    Pronunciation of dictionary term "PSMA PET scan"
    An imaging procedure that is used to help find prostate cancer cells in the body. For this procedure, a cell-targeting molecule linked to a radioactive substance is injected into the body and travels through the blood. It attaches to a protein called prostate-specific membrane antigen (PSMA) that is found on the surface of prostate cancer cells. A PET scanner detects high concentrations of the radioactive molecule and shows where the prostate cancer cells are in the body. A PSMA PET scan may be used to help diagnose prostate cancer that may have come back or spread to other parts of the body. It may also be used to help plan treatment. Also called prostate-specific membrane antigen PET scan.
  psoralen: (SOR-uh-len)
    Pronunciation of dictionary term "psoralen"
    A substance from plants that is sensitive to light (or can be activated by light). Psoralens are used together with UV light to treat psoriasis, vitiligo, and skin nodules of cutaneous T-cell lymphoma. They are also being studied in the treatment of graft-versus-host disease. Psoralen is a type of furocoumarin. An example of a psoralen is methoxsalen.
  psoralen and ultraviolet A therapy: (SOR-uh-len…UL-truh-VY-oh-let A THAYR-uh-pee)
    Pronunciation of dictionary term "psoralen and ultraviolet A therapy"
    A type of photodynamic therapy used to treat skin conditions such as psoriasis, vitiligo, and skin nodules of cutaneous T-cell lymphoma. The patient receives psoralen (a drug that becomes active when it is exposed to light) by mouth or applied to the skin, followed by ultraviolet A radiation. Psoralen and ultraviolet A therapy may increase the risk of getting skin cancer. Also called PUVA therapy.
  psoriasis: (suh-RY-uh-sis)
    Pronunciation of dictionary term "psoriasis"
    A chronic disease of the skin marked by red patches covered with white scales.
  psychiatrist: (sy-KY-uh-trist)
    Pronunciation of dictionary term "psychiatrist"
    A medical doctor who has special training in preventing, diagnosing, and treating mental, emotional, and behavioral disorders.
  psychoactive substance: (SY-koh-AK-tiv SUB-stunts)
    Pronunciation of dictionary term "psychoactive substance"
    A drug or other substance that affects how the brain works and causes changes in mood, awareness, thoughts, feelings, or behavior. Examples of psychoactive substances include alcohol, caffeine, nicotine, marijuana, and certain pain medicines. Many illegal drugs, such as heroin, LSD, cocaine, and amphetamines are also psychoactive substances. Also called psychotropic substance.
  psychological: (SY-koh-LAH-jih-kul)
    Pronunciation of dictionary term "psychological"
    Having to do with how the mind works and how thoughts and feelings affect behavior.
  psychologist: (sy-KAH-loh-jist)
    Pronunciation of dictionary term "psychologist"
    A specialist who can talk with patients and their families about emotional and personal matters, and can help them make decisions.
  psychology: (sy-KAH-loh-jee)
    Pronunciation of dictionary term "psychology"
    The study of how the mind works and how thoughts and feelings affect behavior.
  psychosis: (sy-KOH-sis)
    Pronunciation of dictionary term "psychosis"
    A severe mental disorder in which a person loses the ability to recognize reality or relate to others. The person is not able to cope with the demands of everyday life. Symptoms include being paranoid, having false ideas about what is taking place or who one is, and seeing, hearing, or feeling things that are not there.
  psychosocial: (SY-koh-SOH-shul)
    Pronunciation of dictionary term "psychosocial"
    In medicine, having to do with the mental, emotional, social, and spiritual effects of a disease, such as cancer. Some of the psychosocial effects of cancer are changes in how a patient thinks, their feelings, moods, beliefs, ways of coping, and relationships with family, friends, and co-workers. There are different kinds of psychosocial support that can help cancer patients, including counseling, education, group support, and spiritual support.
  psychosocial support: (SY-koh-SOH-shul suh-PORT)
    Pronunciation of dictionary term "psychosocial support"
    In medicine, support given to help meet the mental, emotional, social, and spiritual needs of patients and their families. Diseases, such as cancer, can affect a patient’s thoughts, feelings, moods, beliefs, ways of coping, and relationships with family, friends, and co-workers. There are different kinds of psychosocial support that can help cancer patients. These include counseling, education, group support, and spiritual support.
  psychostimulant: (SY-koh-STIM-yoo-lunt)
    Pronunciation of dictionary term "psychostimulant"
    A drug that causes a sense of well-being, decreases fatigue and depression, and increases the desire to eat. These drugs can also cause mood changes and trouble with sleeping.
  psychotherapy: (SY-koh-THAYR-uh-pee)
    Pronunciation of dictionary term "psychotherapy"
    Treatment of mental, emotional, personality, and behavioral disorders using methods such as discussion, listening, and counseling. Also called talk therapy.
  psychotropic substance: (SY-koh-TROH-pik SUB-stunts)
    Pronunciation of dictionary term "psychotropic substance"
    A drug or other substance that affects how the brain works and causes changes in mood, awareness, thoughts, feelings, or behavior. Examples of psychotropic substances include alcohol, caffeine, nicotine, marijuana, and certain pain medicines. Many illegal drugs, such as heroin, LSD, cocaine, and amphetamines are also psychotropic substances. Also called psychoactive substance.
  psyllium: (SIH-lee-um)
    Pronunciation of dictionary term "psyllium"
    A plant with seeds that are used as a mild laxative. The outer layer of the seeds swells when wet. This increases the size of stool and helps it pass more easily through the intestines (lower part of the digestive tract). Psyllium is a type of bulk laxative.
  PT-100: A substance being studied in the treatment of cancer, including certain types of lung, pancreas, and brain cancer. PT-100 may help the immune system block the growth of cancer cells. It may also increase the growth of new blood cells. It is a type of enzyme inhibitor. Also called talabostat mesylate.
  PTC: A procedure to x-ray the hepatic and common bile ducts. A contrasting agent is injected into the liver or bile duct, and the ducts are then x-rayed to find the point of obstruction. Also called percutaneous transhepatic cholangiography.
  PTCD: A procedure to drain bile to relieve pressure in the bile ducts caused by a blockage. An x-ray of the liver and bile ducts locates the blockage of bile flow. Images made by ultrasound guide placement of a stent (tube), which remains in the liver. Bile drains through the stent into the small intestine or into a collection bag outside the body. This procedure may relieve jaundice before surgery. Also called percutaneous transhepatic biliary drainage and percutaneous transhepatic cholangiodrainage.
  PTCH1 gene: (… jeen)
    Pronunciation of dictionary term "PTCH1 gene"
    A gene that is part of a cell signaling pathway involved in the formation of tissues and organs, cell growth, and cell division during embryonic development. Mutations (changes) in the PTCH1 gene may cause cells to grow and divide too quickly or in an uncontrolled way. This may cause abnormal cells, including cancer cells, to grow. PTCH1 gene mutations have been found in an inherited condition called basal cell nevus syndrome and in many types of cancer, including basal cell skin cancer, medulloblastoma (a type of brain cancer), breast cancer, and colon cancer. The PTCH1 gene is a type of tumor suppressor gene.
    More Information
    - PTCH1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/ptch1/)
  PTCH2 gene: (… jeen)
    Pronunciation of dictionary term "PTCH2 gene"
    A gene that is part of a cell signaling pathway involved in the formation of tissues and organs, cell growth, and cell division during embryonic development. Mutations (changes) in the PTCH2 gene may cause cells to grow and divide too quickly or in an uncontrolled way. This may cause abnormal cells, including cancer cells, to grow. PTCH2 gene mutations have been found in an inherited condition called basal cell nevus syndrome and in some types of cancer, including basal cell skin cancer and medulloblastoma (a type of brain cancer). The PTCH2 gene is a type of tumor suppressor gene.
  PTEN: A protein that helps control many cell functions, including cell division and cell death. Mutations (changes) in the gene that makes PTEN are found in many types of cancer and other diseases. It is a type of tumor suppressor protein. Also called PTEN tyrosine phosphatase.
  PTEN gene: (... jeen)
    Pronunciation of dictionary term "PTEN gene"
    A gene that makes a protein involved in controlling many cell functions, including cell division and cell death. The PTEN protein may also be involved in cell movement, the attachment of cells to surrounding tissues, and the formation of new blood vessels. Mutations (changes) in the PTEN gene have been found in many types of cancer and in several disorders in which people develop benign (not cancer) tumors. The PTEN gene is a type of tumor suppressor gene.
    More Information
    - PTEN gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/pten/)
  PTEN hamartoma tumor syndrome: (… HA-mar-TOH-muh TOO-mer SIN-drome)
    Pronunciation of dictionary term "PTEN hamartoma tumor syndrome"
    A group of inherited disorders caused by mutations (changes) in the PTEN gene. In people with PTEN hamartoma tumor syndrome, many benign (not cancer) growths called hamartomas form in different parts of the body, especially the skin, mouth, and gastrointestinal tract. Benign tumors may also occur in the thyroid, breast, uterus, soft tissue, and brain. Other signs and symptoms include a larger-than-average head, abnormal skin changes, blood vessel problems, autism spectrum disorder, and learning and developmental delays. People with PTEN hamartoma tumor syndrome have an increased risk of developing certain types of cancer, including melanoma and cancers of the breast, thyroid, kidney, endometrium, colon, and rectum. Also called PHTS.
    More Information
    - PTEN hamartoma tumor syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/12800/pten-hamartoma-tumor-syndrome)
  PTEN tyrosine phosphatase: (…TY-ruh-seen FOS-fuh-tays)
    Pronunciation of dictionary term "PTEN tyrosine phosphatase"
    A protein that helps control many cell functions, including cell division and cell death. Mutations (changes) in the gene that makes PTEN tyrosine phosphatase are found in many types of cancer and other diseases. It is a type of tumor suppressor protein. Also called PTEN.
  PTH: A substance made by the parathyroid gland that helps the body store and use calcium. A higher-than-normal amount of PTH causes high levels of calcium in the blood and may be a sign of disease. Also called parathormone, parathyrin, and parathyroid hormone.
  PTK787/ZK 222584: A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called protein tyrosine kinase inhibitors and VEGF receptor kinase inhibitors. Also called vatalanib.
  PTLD: A condition in which a group of B-cells grow out of control after an organ transplant in patients with weakened immune systems. This usually happens if the patient has also been infected with Epstein-Barr virus. PTLD may progress to non-Hodgkin lymphoma. Also called post-transplant lymphoproliferative disorder.
  ptosis: (TOH-sis)
    Pronunciation of dictionary term "ptosis"
    Drooping of the upper eyelid.
  PTSD: An anxiety disorder that develops in reaction to physical injury or severe mental or emotional distress, such as military combat, violent assault, natural disaster, or other life-threatening events. Having cancer may also lead to PTSD. Symptoms interfere with day-to-day living and include reliving the event in nightmares or flashbacks; avoiding people, places, and things connected to the event; feeling alone and losing interest in daily activities; and having trouble concentrating and sleeping. Also called post-traumatic stress disorder.
    More Information
    - Cancer-Related Post-Traumatic Stress
  puberty: (PYOO-ber-tee)
    Pronunciation of dictionary term "puberty"
    The time of life when a child experiences physical and hormonal changes that mark a transition into adulthood. The child develops secondary sexual characteristics and becomes able to have children. Secondary sexual characteristics include growth of pubic, armpit, and leg hair; breast enlargement; and increased hip width in girls. In boys, they include growth of pubic, face, chest and armpit hair; voice changes; penis and testicle growth, and increased shoulder width.
  public health insurance: (PUH-blik helth in-SHOOR-ents)
    Pronunciation of dictionary term "public health insurance"
    A program run by U.S. federal, state, or local governments in which people have some or all of their health care costs paid for by the government. The two main types of public health insurance are Medicare and Medicaid. Medicare is a federal health insurance program for people aged 65 years or older and people with certain disabilities. Medicaid is a public health insurance program for some individuals and families with a low income or disabilities.
  pulmonary: (PUL-muh-NAYR-ee)
    Pronunciation of dictionary term "pulmonary"
    Having to do with the lungs.
  pulmonary disease: (PUL-muh-NAYR-ee dih-ZEEZ)
    Pronunciation of dictionary term "pulmonary disease"
    A type of disease that affects the lungs and other parts of the respiratory system. Pulmonary diseases may be caused by infection, by smoking tobacco, or by breathing in secondhand tobacco smoke, radon, asbestos, or other forms of air pollution. Pulmonary diseases include asthma, chronic obstructive pulmonary disease (COPD), pulmonary fibrosis, pneumonia, and lung cancer. Also called lung disorder and respiratory disease.
  pulmonary edema: (PUL-muh-NAYR-ee eh-DEE-muh)
    Pronunciation of dictionary term "pulmonary edema"
    A buildup of fluid in the alveoli (air spaces) in the lungs. This keeps oxygen from getting into the blood. Pulmonary edema is usually caused by heart problems, but it can also be caused by high blood pressure, pneumonia, certain toxins and medicines, or living at a high altitude. Symptoms include coughing, shortness of breath, and trouble exercising.
  pulmonary embolism: (PUL-muh-NAYR-ee EM-boh-lih-zum)
    Pronunciation of dictionary term "pulmonary embolism"
    A sudden blockage of an artery (blood vessel) in the lung. A pulmonary embolism usually occurs when a blood clot in a deep vein in the leg or pelvis breaks loose and travels through the blood to the lungs. It may not cause any signs or symptoms, or it may cause shortness of breath, chest pain, a bloody cough, or a fast or abnormal heartbeat. A pulmonary embolism can be life-threatening, especially if the blood clot is large or there are many clots. It may be caused by surgery and by certain medical conditions, such as cancer, heart disease, or lung disease. It can also be caused by taking medicines that contain hormones, pregnancy and childbirth, not moving for long periods of time, older age, smoking, obesity, and having a family history of blood clots or pulmonary embolism.
  pulmonary function: (PUL-muh-NAYR-ee FUNK-shun)
    Pronunciation of dictionary term "pulmonary function"
    A term used to describe how well the lungs work in helping a person breathe. During breathing, oxygen is taken into the lungs, where it passes into the blood and travels to the body’s tissues. Carbon dioxide, a waste product made by the body’s tissues, is carried to the lungs, where it is breathed out. There are different tests to measure pulmonary function. Also called lung function.
  pulmonary function test: (PUL-muh-NAYR-ee FUNK-shun …)
    Pronunciation of dictionary term "pulmonary function test"
    A test used to measure how well the lungs work. It measures how much air the lungs can hold and how quickly air is moved into and out of the lungs. It also measures how much oxygen is used and how much carbon dioxide is given off during breathing. A pulmonary function test can be used to diagnose a lung disease and to see how well treatment for the disease is working. Also called lung function test and PFT.
  pulmonary rehabilitation education: (PUL-muh-NAYR-ee REE-huh-BIH-lih-TAY-shun EH-juh-KAY-shun)
    Pronunciation of dictionary term "pulmonary rehabilitation education"
    Education about behavior and lifestyle changes to help patients with chronic lung disease decrease breathing problems, return to daily activities, and improve quality of life. Education may include instruction about breathing exercises, nutrition, use of medicines, and ways for the patient to reduce stress and save energy.
  pulmonary specialist: (PUL-muh-NAYR-ee SPEH-shuh-list)
    Pronunciation of dictionary term "pulmonary specialist"
    A doctor who has special training in diagnosing and treating diseases of the lungs. Also called pulmonologist.
  pulmonary sulcus tumor: (PUL-muh-NAYR-ee SUL-kus TOO-mer)
    Pronunciation of dictionary term "pulmonary sulcus tumor"
    A type of lung cancer that begins in the upper part of a lung and spreads to nearby tissues such as the ribs and vertebrae. Most pulmonary sulcus tumors are non-small cell cancers. Also called Pancoast tumor.
  pulmonologist: (PUL-muh-NAH-loh-jist)
    Pronunciation of dictionary term "pulmonologist"
    A doctor who has special training in diagnosing and treating diseases of the lungs. Also called pulmonary specialist.
  pulmonology: (PUL-muh-NAH-loh-jee)
    Pronunciation of dictionary term "pulmonology"
    A branch of medicine that specializes in diagnosing and treating diseases of the lungs and other parts of the respiratory system. These diseases include asthma, emphysema, tuberculosis, and pneumonia.
  Pulmozyme: (PUL-moh-zime)
    Pronunciation of dictionary term "Pulmozyme"
    A drug given in an aerosol mist to decrease the thickness of mucus in the lungs of patients with cystic fibrosis. It is also being studied as a treatment to reduce the thickness of saliva in patients being treated for head and neck cancer. Pulmozyme contains an enzyme that breaks the DNA in mucus into small pieces and makes the mucus thinner. Also called dornase alfa inhalation solution.
  pulse: (puls)
    Pronunciation of dictionary term "pulse"
    In medicine, the number of times the heart beats within a certain time period, usually a minute. The pulse can be felt at the wrist, side of the neck, back of the knees, top of the foot, groin, and other places in the body where an artery is close to the skin. The resting pulse is normally between 60 and 100 beats a minute in a healthy adult who is at rest. Measuring the pulse gives important information about a person’s health. Also called heart rate.
  pump: (pump)
    Pronunciation of dictionary term "pump"
    A device that is used to give a controlled amount of a liquid at a specific rate. For example, pumps are used to give drugs (such as chemotherapy or pain medicine) or nutrients.
  punch biopsy: (... BY-op-see)
    Pronunciation of dictionary term "punch biopsy"
    A procedure in which a small round piece of tissue about the size of a pencil eraser is removed using a sharp, hollow, circular instrument. The tissue is then checked under a microscope for signs of disease. A punch biopsy may be used to check for certain types of cancer, including skin, vulvar, and cervical cancer. It may also be used to check for certain skin conditions and changes that may lead to cancer.
    Punch biopsy. A sharp, hollow, circular instrument is used to remove a small, round piece of tissue from a lesion on the skin. The instrument is turned clockwise and counterclockwise to cut about 4 millimeters (mm) down to the layer of fatty tissue below the skin and remove the sample of tissue. Skin thickness is different on different parts of the body.
    Punch biopsy; drawing shows a sharp, hollow, circular instrument being inserted into a lesion on the skin of a patient’s forearm. The instrument is turned clockwise and counterclockwise to cut into the skin and remove a small, round piece of tissue. A pullout shows that the instrument cuts about 4 millimeters (mm) down to the layer of fatty tissue below the skin.
  pupil: (PYOO-pul)
    Pronunciation of dictionary term "pupil"
    The round opening in the center of the iris (the colored tissue that makes the "eye color" at the front of the eye). The pupil changes size to let light into the eye. It gets smaller in bright light and larger as the amount of light decreases.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  pure red cell aplasia: (… sel uh-PLAY-zhuh)
    Pronunciation of dictionary term "pure red cell aplasia"
    A rare disorder in which the bone marrow does not make enough red blood cells. Signs and symptoms include fatigue, pale skin, breathing problems, dizziness, and headaches. Pure red cell aplasia mainly affects adults and may be caused by infection, kidney failure, an autoimmune disease (such as lupus or rheumatoid arthritis), pregnancy, a thymoma (tumor of the thymus gland), and certain types of cancer, including leukemia. It may also be caused by taking certain medicines. Pure red cell aplasia may also be inherited and seen in the first year of life, but this is very rare. Also called PRCA.
    More Information
    - Pure red cell aplasia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7504/pure-red-cell-aplasia)
  purine: (PYOOR-een)
    Pronunciation of dictionary term "purine"
    One of two chemical compounds that cells use to make the building blocks of DNA and RNA. Examples of purines are adenine and guanine. Purines are also found in meat and meat products. They are broken down by the body to form uric acid, which is passed in the urine. High levels of uric acid in the body may cause gout.
  purine nucleoside analog: (PYOOR-een NOO-klee-oh-side A-nuh-log)
    Pronunciation of dictionary term "purine nucleoside analog"
    A type of anticancer drug that is similar to a natural chemical compound called purine. Cells use purine to make the chemical building blocks of DNA and RNA. Purine nucleoside analogs may kill cells, including cancer cells, by blocking important enzymes needed to make DNA and RNA and by damaging DNA. Some purine nucleoside analogs are used to treat certain types of leukemia and lymphoma. Also called PNA.
  Purinethol: (pyoor-IN-eh-thol)
    Pronunciation of dictionary term "Purinethol"
    A drug used with other drugs to treat adults and children with acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Purinethol stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called mercaptopurine and Purixan.
    More Information
    - Mercaptopurine (https://www.cancer.gov/about-cancer/treatment/drugs/mercaptopurine)
  Purixan: (PYOOR-ee-zan)
    Pronunciation of dictionary term "Purixan"
    A drug used with other drugs to treat adults and children with acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Purixan stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite. Also called mercaptopurine and Purinethol.
    More Information
    - Mercaptopurine (https://www.cancer.gov/about-cancer/treatment/drugs/mercaptopurine)
  purple clover: (PER-pul KLOH-ver)
    Pronunciation of dictionary term "purple clover"
    Trifolium pratense. A plant with flowers that has been used in some cultures to treat certain medical problems. It is being studied in the relief of menopausal symptoms and may have anticancer effects. Also called red clover, Trifolium pratense, and wild clover.
  purple coneflower: (PER-pul KONE-flow-er)
    Pronunciation of dictionary term "purple coneflower"
    An herb native to North America that has been used to prevent and treat the common cold and other respiratory infections. Purple coneflower may interfere with treatment that uses the immune system to fight cancer. The scientific names are Echinacea purpurea and Echinacea angustifolia. Also called echinacea.
  PUVA therapy: (...THAYR-uh-pee)
    Pronunciation of dictionary term "PUVA therapy"
    A type of photodynamic therapy used to treat skin conditions such as psoriasis, vitiligo, and skin nodules of cutaneous T-cell lymphoma. The patient receives psoralen (a drug that becomes active when it is exposed to light) by mouth or applied to the skin, followed by ultraviolet A radiation. PUVA therapy may increase the risk of getting skin cancer. Also called psoralen and ultraviolet A therapy.
  PV: The science and practice of continuously reviewing the safety of drugs as they are tested in clinical trials and marketed for use. As part of PV, data about the problems caused by treatment with a drug are collected and analyzed. This process helps find ways to prevent adverse events and improve the safety of drugs. Also called pharmacovigilance.
  PV701: A virus that is being studied in the treatment of cancer. It belongs to the family of viruses that cause Newcastle disease in birds.
  PXD101: A drug used to treat adults with peripheral T-cell lymphoma that has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. PXD101 blocks certain enzymes needed for cell division and may kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow and may help make cancer cells easier to kill with other anticancer drugs. It is a type of histone deacetylase inhibitor, a type of antiangiogenesis agent, and a type of chemosensitizer. Also called Beleodaq and belinostat.
    More Information
    - Belinostat (https://www.cancer.gov/about-cancer/treatment/drugs/belinostat)
  pylorus: (py-LOR-us)
    Pronunciation of dictionary term "pylorus"
    The part of the stomach that connects to the duodenum (first part of the small intestine). The pylorus is a valve that opens and closes during digestion. This allows partly digested food and other stomach contents to pass from the stomach to the small intestine.
    The stomach is an organ in the upper abdomen. It can be divided into the cardia and the non-cardia, which includes the fundus, the body, the antrum, and the pylorus. The stomach is part of the digestive system.
    Drawing of the stomach showing the cardia, the fundus, the body, the antrum, and the pylorus.
  pyogenic granuloma: (PY-oh-JEH-nik GRAN-yoo-LOH-muh)
    Pronunciation of dictionary term "pyogenic granuloma"
    A benign (not cancer) blood vessel tumor that usually forms on the skin. It may also form on mucous membranes and inside capillaries (small blood vessels) or other places on the body. Pyogenic granulomas usually appear as raised, bright red lesions that may grow quickly and bleed a lot. The lesions are sometimes caused by injury or use of certain medicines and often come back after treatment. They usually occur in older children and young adults but may occur at any age. Pyogenic granulomas are a type of vascular tumor. Also called lobular capillary hemangioma.
  pyrazine diazohydroxide: (PEER-uh-zeen dy-A-zoh-hy-DROK-side)
    Pronunciation of dictionary term "pyrazine diazohydroxide"
    A substance that is being studied in the treatment of cancer.
  pyrazoloacridine: (PEER-uh-ZOH-loh-A-krih-deen)
    Pronunciation of dictionary term "pyrazoloacridine"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called acridines.
  pyridoxine: (PEER-ih-DOK-seen)
    Pronunciation of dictionary term "pyridoxine"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Pyridoxine helps keep nerves and skin healthy, fight infections, keep blood sugar levels normal, produce red blood cells, and some enzymes work properly. Pyridoxine is a group of related compounds (pyridoxine, pyridoxal, and pyridoxamine) found in cereals, beans, peas, nuts, meat, poultry, fish, eggs, and bananas. It is water-soluble (can dissolve in water). Not enough pyridoxine can cause mouth and tongue sores and nervous disorders. Pyridoxine is being studied in the prevention of hand-foot syndrome (a disorder caused by certain anticancer drugs and marked by pain, swelling, numbness, tingling, or redness of the hands or feet). Also called vitamin B6.
    More Information
    - Cancer Prevention Overview
  pyrimidine: (py-RIH-mih-deen)
    Pronunciation of dictionary term "pyrimidine"
    One of two chemical compounds that cells use to make the building blocks of DNA and RNA. Examples of pyrimidines are cytosine, thymine, and uracil. Cytosine and thymine are used to make DNA and cytosine and uracil are used to make RNA.
  pyroxamide: (py-ROK-suh-mide)
    Pronunciation of dictionary term "pyroxamide"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called histone deacetylase inhibitors.
  Q10: A nutrient that the body needs in small amounts to function and stay healthy. Q10 helps mitochondria (small structures in the cell) make energy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). Q10 is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, beef, soybeans, peanuts, and spinach. It is being studied in the prevention and treatment of some types of cancer and heart disease and in the relief of side effects caused by some cancer treatments. Also called coenzyme Q10, CoQ10, ubiquinone, and vitamin Q10.
    More Information
    - Coenzyme Q10
  QA: A process that looks at activities or products on a regular basis to make sure they are being done at the required level of excellence. In clinical trials, QA makes sure that all parts of the trial follow the law and the Good Clinical Practice guidelines. Also called quality assurance.
  qi: (chee)
    Pronunciation of dictionary term "qi"
    In traditional Chinese medicine, vital energy or life force that keeps a person’s spiritual, emotional, mental, and physical health in balance.
  qigong: (chee-gong)
    Pronunciation of dictionary term "qigong"
    A form of traditional Chinese mind/body exercise and meditation that uses slow and precise body movements with controlled breathing and mental focusing to improve balance, flexibility, muscle strength, and overall health.
  Qinlock: (KIN-lok)
    Pronunciation of dictionary term "Qinlock"
    A drug used to treat adults with advanced gastrointestinal stromal tumor. It is used in patients whose cancer was already treated with at least three other kinase inhibitors, including imatinib mesylate. It is also being studied in the treatment of other types of cancer. Qinlock blocks certain proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called ripretinib.
    More Information
    - Ripretinib (https://www.cancer.gov/about-cancer/treatment/drugs/ripretinib)
  QNBC: A type of breast cancer in which the tumor cells do not have estrogen receptors, progesterone receptors, androgen receptors, or large amounts of HER2/neu protein on their surface. Knowing whether breast cancer is quadruple negative is important in planning treatment. Also called quadruple-negative breast cancer.
  QS21: A substance from plants that is being studied together with vaccine therapy for its ability to improve the way the immune system responds to disease. It belongs to the family of drugs called saponin adjuvants.
  Quadramet: (KWAH-druh-met)
    Pronunciation of dictionary term "Quadramet"
    A drug used to treat bone pain caused by bone cancer and other cancers that have spread to the bone. It contains a radioactive substance called samarium Sm 153. Quadramet collects in bone and gives off radiation that may kill cancer cells. Also called samarium Sm 153-lexidronam pentasodium.
  quadrantectomy: (KWAD-ran-TEK-toh-mee)
    Pronunciation of dictionary term "quadrantectomy"
    Surgery to remove cancer or other abnormal tissue from the breast and some normal tissue around it, but not the breast itself. Some lymph nodes under the arm may be removed for biopsy. Part of the chest wall lining may also be removed if the cancer is near it. Also called breast-conserving surgery, breast-sparing surgery, lumpectomy, partial mastectomy, and segmental mastectomy.
    More Information
    - Breast Cancer Treatment
    Lumpectomy. The tumor and some normal tissue around it are removed, but not the breast itself. Some lymph nodes under the arm may also be removed. If the cancer is near the chest wall, part of the chest wall lining may be removed as well.
    Lumpectomy; the drawing on the left shows removal of the tumor and some of the normal tissue around it. The drawing on the right shows removal of some of the lymph nodes under the arm and removal of the tumor and part of the chest wall lining near the tumor. Also shown is fatty tissue in the breast.
  quadrivalent vaccine: (KWAH-drih-VAY-lent vak-SEEN)
    Pronunciation of dictionary term "quadrivalent vaccine"
    A vaccine that works by stimulating an immune response against four different antigens, such as four different viruses or other microorganisms. For example, Gardasil is a quadrivalent vaccine that helps protect the body against infection with four different types of human papillomaviruses (HPV).
  quadruple-negative breast cancer: (kwah-DROO-pul NEH-guh-tiv brest KAN-ser)
    Pronunciation of dictionary term "quadruple-negative breast cancer"
    A type of breast cancer in which the tumor cells do not have estrogen receptors, progesterone receptors, androgen receptors, or large amounts of HER2/neu protein on their surface. Knowing whether breast cancer is quadruple negative is important in planning treatment. Also called QNBC.
  quality assurance: (KWAH-lih-tee uh-SHOOR-ents)
    Pronunciation of dictionary term "quality assurance"
    A process that looks at activities or products on a regular basis to make sure they are being done at the required level of excellence. In clinical trials, quality assurance makes sure that all parts of the trial follow the law and the Good Clinical Practice guidelines. Also called QA.
  quality of life: (KWAH-lih-tee ... life)
    Pronunciation of dictionary term "quality of life"
    The overall enjoyment of life. Many clinical trials assess the effects of cancer and its treatment on the quality of life. These studies measure aspects of an individual’s sense of well-being and ability to carry out activities of daily living.
  quinone oxidoreductase 1: (KWIH-none OK-sih-doh-ree-DUK-tays ...)
    Pronunciation of dictionary term "quinone oxidoreductase 1"
    An enzyme inside cells that makes certain molecules less toxic. Also called quinone reductase.
  quinone reductase: (KWIH-none ree-DUK-tays)
    Pronunciation of dictionary term "quinone reductase"
    An enzyme inside cells that makes certain molecules less toxic. Also called quinone oxidoreductase 1.
  quizartinib dihydrochloride: (kwih-ZAR-tih-nib dy-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "quizartinib dihydrochloride"
    A drug used with certain chemotherapy drugs and then alone as maintenance therapy to treat adults with newly diagnosed acute myeloid leukemia that has a certain mutation in the FLT3 gene. It is also being studied in the treatment of other types of cancer. Quizartinib dihydrochloride blocks FLT3 and other proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Vanflyta.
    More Information
    - Quizartinib Dihydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/quizartinib-dihydrochloride)
  R-CHOP: An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin lymphoma and mantle cell lymphoma and is being studied in the treatment of other types of cancer. It includes the drugs rituximab, cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), vincristine sulfate (Oncovin), and prednisone. Also called R-CHOP regimen.
    More Information
    - R-CHOP (https://www.cancer.gov/about-cancer/treatment/drugs/R-CHOP)
  R-CHOP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "R-CHOP regimen"
    An abbreviation for a chemotherapy combination that is used to treat non-Hodgkin lymphoma and mantle cell lymphoma and is being studied in the treatment of other types of cancer. It includes the drugs rituximab, cyclophosphamide, doxorubicin hydrochloride (hydroxydaunorubicin), vincristine sulfate (Oncovin), and prednisone. Also called R-CHOP.
    More Information
    - R-CHOP (https://www.cancer.gov/about-cancer/treatment/drugs/R-CHOP)
  R-CVP: An abbreviation for a chemotherapy combination used to treat indolent (slow-growing) non-Hodgkin lymphoma. It includes the drugs rituximab, cyclophosphamide, vincristine sulfate, and prednisone. Also called R-CVP regimen.
    More Information
    - R-CVP (https://www.cancer.gov/about-cancer/treatment/drugs/R-CVP)
  R-CVP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "R-CVP regimen"
    An abbreviation for a chemotherapy combination used to treat indolent (slow-growing) non-Hodgkin lymphoma. It includes the drugs rituximab, cyclophosphamide, vincristine sulfate, and prednisone. Also called R-CVP.
    More Information
    - R-CVP (https://www.cancer.gov/about-cancer/treatment/drugs/R-CVP)
  R-EPOCH: An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs rituximab, etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, and doxorubicin hydrochloride (hydroxydaunorubicin). Also called EPOCH-R, EPOCH-R regimen, and R-EPOCH regimen.
    More Information
    - R-EPOCH (https://www.cancer.gov/about-cancer/treatment/drugs/R-EPOCH)
  R-EPOCH regimen: (... REH-jih-men)
    Pronunciation of dictionary term "R-EPOCH regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs rituximab, etoposide phosphate, prednisone, vincristine sulfate (Oncovin), cyclophosphamide, and doxorubicin hydrochloride (hydroxydaunorubicin). Also called EPOCH-R, EPOCH-R regimen, and R-EPOCH.
    More Information
    - R-EPOCH (https://www.cancer.gov/about-cancer/treatment/drugs/R-EPOCH)
  R-flurbiprofen: (… FLOOR-bih-PROH-fen)
    Pronunciation of dictionary term "R-flurbiprofen"
    A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called nonsteroidal anti-inflammatory drugs (NSAIDs).
  R-ICE: An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs rituximab, ifosfamide, carboplatin, and etoposide phosphate. Also called R-ICE regimen.
    More Information
    - R-ICE (https://www.cancer.gov/about-cancer/treatment/drugs/R-ICE)
  R-ICE regimen: (… REH-jih-men)
    Pronunciation of dictionary term "R-ICE regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of non-Hodgkin lymphoma. It includes the drugs rituximab, ifosfamide, carboplatin, and etoposide phosphate. Also called R-ICE.
    More Information
    - R-ICE (https://www.cancer.gov/about-cancer/treatment/drugs/R-ICE)
  r-metHuSCF: A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. It is being studied in the treatment of myelodysplasia. r-metHuSCF is a type of recombinant stem cell growth factor. Also called ancestim, recombinant human methionyl stem cell factor, and Stemgen.
  r-tPA: A form of tissue plasminogen activator that is made in the laboratory. It helps dissolve blood clots and is used to treat heart attacks, strokes, and clots in the lungs. It is also being studied in the treatment of cancer. It is a type of systemic thrombolytic agent. Also called Activase, Alteplase, and recombinant tissue plasminogen activator.
  R101933: A substance that is being studied for its ability to make cancer cells respond to drugs to which they have become resistant. It belongs to the family of drugs called multidrug resistance inhibitors.
  R115777: A substance that is being studied in the treatment of acute myeloid leukemia (AML) and other types of cancer. It belongs to the family of drugs called farnesyltransferase inhibitors. Also called tipifarnib and Zarnestra.
  R1507: A human monoclonal antibody being studied in the treatment of several types of cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. R1507 blocks the action of a protein needed for cell growth and may kill cancer cells. It is a type of insulin-like growth factor-1 receptor (IGF-1R) inhibitor.
  R788 sodium: (… SOH-dee-um)
    Pronunciation of dictionary term "R788 sodium"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults with chronic immune thrombocytopenia (ITP) that did not get better with other treatment. ITP is a condition in which platelets are destroyed by the immune system. R788 sodium is also being studied in the treatment of other conditions and types of cancer. It blocks an enzyme called Syk, which may help keep the immune system from destroying platelets. R788 sodium is a type of tyrosine kinase inhibitor. Also called fostamatinib disodium, Syk kinase inhibitor R-935788, and Tavalisse.
  rabies: (RAY-beez)
    Pronunciation of dictionary term "rabies"
    A disease of the nervous system caused by the rabies virus. Rabies is marked by an increase in saliva production, abnormal behavior, and eventual paralysis and death.
  race: A concept used to describe a group of people who share physical characteristics, such as skin color and facial features. They may also share similar social or cultural identities and ancestral backgrounds. There are many racial groups, and a person may belong to or identify with more than one group. Some diseases, such as cancer, may be more common in certain races than in others.
  rachitis: (ray-KY-tis)
    Pronunciation of dictionary term "rachitis"
    A condition in children in which bones become soft and deformed because they don’t have enough calcium and phosphorus. It is caused by not having enough vitamin D in the diet or by not getting enough sunlight. In adults, this condition is called osteomalacia. Also called infantile rickets, juvenile rickets, and rickets.
  racism: (RAY-sih-zum)
    Pronunciation of dictionary term "racism"
    The structures, policies, practices, beliefs, and behaviors in a society that create an unfair advantage for some people and unfair or harmful treatment of others based on their race or ethnic group. Racism affects the physical, social, and economic conditions of where people live, learn, work, and play, including access to health care services. It is a serious problem and can lead to poor health outcomes, such as higher rates of disease and death in certain racial and ethnic groups.
  rAd/p53: A substance that has been studied in the treatment of some types of cancer. rAd/p53 is a weakened adenovirus that carries the p53 gene into tumor cells, causing them to die. It is a type of gene therapy. Also called ACN53, recombinant adenovirus-p53, and SCH-58500.
  RAD001: A drug used alone or with other drugs to treat certain types of breast cancer, kidney cancer, and pancreatic, lung, and gastrointestinal neuroendocrine tumors. It is used under the brand name Afinitor to treat these cancers and to treat a type of benign kidney tumor called renal angiomyolipoma and a type of benign brain tumor called subependymal giant cell astrocytoma in patients who have tuberous sclerosis. RAD001 is also used under the brand name Afinitor Disperz to treat subependymal giant cell astrocytoma and certain types of seizures in patients who have tuberous sclerosis. It is also used under the brand name Zortress to keep the body from rejecting a kidney or liver transplant. RAD001 is also being studied in the treatment of other conditions and types of cancer. It blocks a protein involved in cell division, which may help keep abnormal cells, including cancer cells, from growing. It may also prevent the growth of new blood vessels that tumors need to grow. RAD001 also lowers the body’s immune response. It is a type of kinase inhibitor, a type of angiogenesis inhibitor, and a type of immunosuppressant. Also called everolimus.
    More Information
    - Everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
  radial scar: (RAY-dee-ul skar)
    Pronunciation of dictionary term "radial scar"
    A benign (not cancer) area of hardened tissue in the breast that looks like a scar when viewed under a microscope. Radial scars often occur in both breasts, and more than one lesion is usually present in each breast. They usually cannot be felt and do not cause symptoms but may look like breast cancer on a mammogram, especially if the lesions are large. A biopsy is usually needed to tell the difference between these lesions and breast cancer. Radial scars may slightly increase the risk of breast cancer. Also called complex sclerosing lesion.
  radiation: (RAY-dee-AY-shun)
    Pronunciation of dictionary term "radiation"
    Energy released in the form of particle or electromagnetic waves. Common sources of radiation include radon gas, cosmic rays from outer space, medical x-rays, and energy given off by a radioisotope (unstable form of a chemical element that releases radiation as it breaks down and becomes more stable). Radiation can damage cells. It is used to diagnose and treat some types of cancer.
  radiation brachytherapy: (RAY-dee-AY-shun BRAY-kee-THAYR-uh-pee)
    Pronunciation of dictionary term "radiation brachytherapy"
    A type of radiation therapy in which radioactive implants, such as pellets, seeds, ribbons, wires, needles, balloons, or capsules, are placed in the body, directly into or near the tumor. The radiation is delivered through a flexible tube called a catheter or a larger device called an applicator. Radiation brachytherapy is often used to treat cancers of the head and neck, breast, cervix, prostate, and eye. Depending on the type of cancer and treatment plan, the implant may be kept in place for a few minutes, many days, or permanently. Also called brachytherapy and implant radiation therapy.
  radiation cystitis: (RAY-dee-AY-shun sis-TY-tis)
    Pronunciation of dictionary term "radiation cystitis"
    Inflammation of the lining of the bladder caused by radiation therapy to the pelvis, including the bladder. Symptoms include pain and a burning feeling while urinating, blood in the urine, feeling a need to urinate often or right away, being unable to control the flow of urine, bladder spasms, and pain in the pelvis. Some symptoms of radiation cystitis may go away after radiation therapy has ended, but others may continue over time.
  radiation dermatitis: (RAY-dee-AY-shun DER-muh-TY-tis)
    Pronunciation of dictionary term "radiation dermatitis"
    A skin condition that is a common side effect of radiation therapy. The affected skin becomes painful, red, itchy, and blistered.
  radiation enteritis: (RAY-dee-AY-shun EN-teh-RY-tis)
    Pronunciation of dictionary term "radiation enteritis"
    Inflammation of the small intestine caused by radiation therapy to the abdomen, pelvis, or rectum. Symptoms include nausea, vomiting, abdominal pain and cramping, frequent bowel movements, watery or bloody diarrhea, fatty stools, and weight loss. Some of these symptoms may continue for a long time.
  radiation fibrosis: (RAY-dee-AY-shun fy-BROH-sis)
    Pronunciation of dictionary term "radiation fibrosis"
    The formation of scar tissue as a result of radiation therapy.
  radiation necrosis: (RAY-dee-AY-shun neh-KROH-sis)
    Pronunciation of dictionary term "radiation necrosis"
    The death of healthy tissue caused by radiation therapy. Radiation necrosis is a side effect of radiation therapy given to kill cancer cells, and can occur after cancer treatment has ended.
  radiation nurse: (RAY-dee-AY-shun nurs)
    Pronunciation of dictionary term "radiation nurse"
    A health professional who specializes in caring for people who are receiving radiation therapy.
  radiation oncologist: (RAY-dee-AY-shun on-KAH-loh-jist)
    Pronunciation of dictionary term "radiation oncologist"
    A doctor who has special training in using radiation to treat cancer.
  radiation physicist: (RAY-dee-AY-shun FIH-zih-sist)
    Pronunciation of dictionary term "radiation physicist"
    A person who makes sure that the radiation machine delivers the right amount of radiation to the correct site in the body. The physicist works with the radiation oncologist to choose the treatment schedule and dose that has the best chance of killing the most cancer cells.
  radiation poisoning: (RAY-dee-AY-shun POY-zuh-ning)
    Pronunciation of dictionary term "radiation poisoning"
    Serious illness caused by being exposed to high doses of certain types of radiation, usually over a short period of time. Symptoms of radiation poisoning usually occur right after exposure but they may happen over time, and they may come and go. Symptoms include nausea and vomiting, diarrhea, headache, dizziness, weakness, fatigue, bleeding, hair loss, swelling, itching, and redness of the skin, and other skin problems. Very large doses of radiation may cause death. Also called acute radiation sickness, acute radiation syndrome, radiation sickness, and radiation sickness syndrome.
  radiation recall: (RAY-dee-AY-shun REE-kawl)
    Pronunciation of dictionary term "radiation recall"
    An inflammatory reaction that can occur when certain anticancer drugs are given after radiation therapy. It usually affects the part of the body that received radiation, especially the skin. It can also affect the lungs, mouth, larynx, esophagus, other parts of the digestive tract, muscles, and the brain. On the skin, radiation recall may look like a severe sunburn and may blister, peel, and become red, swollen, and painful. If other areas of the body are affected, signs and symptoms will vary depending on the site of the radiation. Radiation recall can occur weeks, months, or years after radiation therapy has ended.
  radiation sickness: (RAY-dee-AY-shun SIK-nes)
    Pronunciation of dictionary term "radiation sickness"
    Serious illness caused by being exposed to high doses of certain types of radiation, usually over a short period of time. Symptoms of radiation sickness usually occur right after exposure but they may happen over time, and they may come and go. Symptoms include nausea and vomiting, diarrhea, headache, dizziness, weakness, fatigue, bleeding, hair loss, swelling, itching, and redness of the skin, and other skin problems. Very large doses of radiation may cause death. Also called acute radiation sickness, acute radiation syndrome, radiation poisoning, and radiation sickness syndrome.
  radiation sickness syndrome: (RAY-dee-AY-shun SIK-nes SIN-drome)
    Pronunciation of dictionary term "radiation sickness syndrome"
    Serious illness caused by being exposed to high doses of certain types of radiation, usually over a short period of time. Symptoms of radiation sickness syndrome usually occur right after exposure but they may happen over time, and they may come and go. Symptoms include nausea and vomiting, diarrhea, headache, dizziness, weakness, fatigue, bleeding, hair loss, swelling, itching, and redness of the skin, and other skin problems. Very large doses of radiation may cause death. Also called acute radiation sickness, acute radiation syndrome, radiation poisoning, and radiation sickness.
  radiation surgery: (RAY-dee-AY-shun SER-juh-ree)
    Pronunciation of dictionary term "radiation surgery"
    A type of external radiation therapy that uses special equipment to position the patient and precisely give a single large dose of radiation to a tumor. It is used to treat brain tumors and other brain disorders that cannot be treated by regular surgery. It is also being studied in the treatment of other types of cancer. Also called radiosurgery, stereotactic radiosurgery, and stereotaxic radiosurgery.
  radiation therapist: (RAY-dee-AY-shun THAYR-uh-pist)
    Pronunciation of dictionary term "radiation therapist"
    A health professional who gives radiation treatment.
  radiation therapy: (RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "radiation therapy"
    The use of high-energy radiation from x-rays, gamma rays, neutrons, protons, and other sources to kill cancer cells and shrink tumors. Radiation may come from a machine outside the body (external-beam radiation therapy), or it may come from radioactive material placed in the body near cancer cells (internal radiation therapy or brachytherapy). Systemic radiation therapy uses a radioactive substance, such as a radiolabeled monoclonal antibody, that travels in the blood to tissues throughout the body. Also called irradiation and radiotherapy.
    More Information
    - Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy)
    - Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
  radical cervicectomy: (RA-dih-kul SER-vih-SEK-toh-mee)
    Pronunciation of dictionary term "radical cervicectomy"
    Surgery to remove the cervix, nearby tissue, and the upper part of the vagina. Lymph nodes in the pelvis may also be removed. After the cervix is removed, the uterus is attached to the remaining part of the vagina. A special stitch or band is placed on the uterus to help keep the uterus closed during a pregnancy. Because the uterus, fallopian tubes, and ovaries are not removed, a radical cervicectomy may be done to treat a person with early-stage cervical cancer who wants to become pregnant in the future. Also called radical trachelectomy.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  radical cystectomy: (RA-dih-kul sis-TEK-toh-mee)
    Pronunciation of dictionary term "radical cystectomy"
    Surgery to remove all of the bladder (the organ that holds urine) as well as nearby tissues and organs.
  radical hysterectomy: (RA-dih-kul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "radical hysterectomy"
    Surgery to remove the uterus, cervix, part of the vagina, and a wide area of ligaments and tissues around these organs. The ovaries, fallopian tubes, and nearby lymph nodes may also be removed. A radical hysterectomy is usually done through a large incision (cut) in the abdomen.
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  radical laparoscopic prostatectomy: (RA-dih-kul LA-puh-ruh-SKAH-pik PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "radical laparoscopic prostatectomy"
    Surgery to remove all of the prostate with the aid of a laparoscope. A laparoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. During a radical laparoscopic prostatectomy, several small incisions (cuts) are made in the wall of the lower abdomen. The laparoscope is inserted through one opening to guide the surgery. Surgical instruments are inserted through the other openings to remove the prostate. An attempt is made to protect the nerves that control penile erection and the bladder from damage.
    More Information
    - Prostate Cancer Treatment (PDQ®)–Patient Version (https://www.cancer.gov/types/prostate/patient/prostate-treatment-pdq)
  radical local excision: (RA-dih-kul LOH-kul ek-SIH-zhun)
    Pronunciation of dictionary term "radical local excision"
    Surgery to remove a tumor and a large amount of normal tissue surrounding it. Nearby lymph nodes may also be removed.
  radical lymph node dissection: (RA-dih-kul limf node dy-SEK-shun)
    Pronunciation of dictionary term "radical lymph node dissection"
    A surgical procedure to remove most or all of the lymph nodes that drain lymph from the area around a tumor. The lymph nodes are then examined under a microscope to see if cancer cells have spread to them.
  radical mastectomy: (RA-dih-kul ma-STEK-toh-mee)
    Pronunciation of dictionary term "radical mastectomy"
    Surgery to remove the whole breast, all of the lymph nodes under the arm, and the chest wall muscles under the breast. For many years, radical mastectomy was the type of breast cancer surgery used most often, but it is rarely used now. It may be used only when breast cancer has spread to the chest wall muscles. Also called Halsted radical mastectomy.
    Radical mastectomy. The whole breast, all of the lymph nodes under the arm, and the chest wall muscles under the breast are removed. For many years, radical mastectomy was the type of breast cancer surgery used most often, but it is rarely used now.
    Radical mastectomy; the drawing on the left shows the removal of the whole breast and the lymph nodes under the arm. The drawing on the right shows a cross-section of the breast, including the fatty tissue and chest wall (ribs and muscle). A tumor in the breast is also shown.
  radical nephrectomy: (RA-dih-kul neh-FREK-toh-mee)
    Pronunciation of dictionary term "radical nephrectomy"
    Surgery to remove an entire kidney, nearby adrenal gland and lymph nodes, and other surrounding tissue.
  radical perineal prostatectomy: (RA-dih-kul PAYR-ih-NEE-ul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "radical perineal prostatectomy"
    Surgery to remove the entire prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). During a radical perineal prostatectomy, an incision (cut) is made in the perineum (the area between the scrotum and anus). Nearby lymph nodes may also be removed through a separate incision in the wall of the abdomen.
    More Information
    - Prostate Cancer Treatment (PDQ®)–Patient Version (https://www.cancer.gov/types/prostate/patient/prostate-treatment-pdq)
    Two types of radical prostatectomy. In a retropubic prostatectomy, the prostate is removed through an incision in the wall of the abdomen. In a perineal prostatectomy, the prostate is removed through an incision in the area between the scrotum and the anus.
    Two panel drawing showing two ways of doing a radical prostatectomy; in the first panel, dotted line shows where incision is made through the wall of the abdomen for a retropubic prostatectomy; in the second panel, dotted line shows where incision is made in area between the scrotum and the anus for a perineal prostatectomy.
  radical prostatectomy: (RA-dih-kul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "radical prostatectomy"
    Surgery to remove the entire prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). Nearby lymph nodes may also be removed. A radical prostatectomy may be done through an incision (cut) made in the wall of the lower abdomen or in the perineum (the area between the scrotum and anus). It may also be done using a laparoscope (a thin, tube-like instrument with a light and lens for viewing) or a special robotic system. An attempt is made to protect the nerves that control penile erection and the bladder from damage.
    More Information
    - Prostate Cancer Treatment (PDQ®)–Patient Version (https://www.cancer.gov/types/prostate/patient/prostate-treatment-pdq)
    Two types of radical prostatectomy. In a retropubic prostatectomy, the prostate is removed through an incision in the wall of the abdomen. In a perineal prostatectomy, the prostate is removed through an incision in the area between the scrotum and the anus.
    Two panel drawing showing two ways of doing a radical prostatectomy; in the first panel, dotted line shows where incision is made through the wall of the abdomen for a retropubic prostatectomy; in the second panel, dotted line shows where incision is made in area between the scrotum and the anus for a perineal prostatectomy.
  radical retropubic prostatectomy: (RA-dih-kul reh-troh-PYOO-bik PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "radical retropubic prostatectomy"
    Surgery to remove the entire prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). Nearby lymph nodes may also be removed. During a radical retropubic prostatectomy, an incision (cut) is made in the wall of the lower abdomen, behind the pubic bone. An attempt is made to protect the nerves that control penile erection and the bladder from damage.
    More Information
    - Prostate Cancer Treatment (PDQ®)–Patient Version (https://www.cancer.gov/types/prostate/patient/prostate-treatment-pdq)
    Two types of radical prostatectomy. In a retropubic prostatectomy, the prostate is removed through an incision in the wall of the abdomen. In a perineal prostatectomy, the prostate is removed through an incision in the area between the scrotum and the anus.
    Two panel drawing showing two ways of doing a radical prostatectomy; in the first panel, dotted line shows where incision is made through the wall of the abdomen for a retropubic prostatectomy; in the second panel, dotted line shows where incision is made in area between the scrotum and the anus for a perineal prostatectomy.
  radical trachelectomy: (RA-dih-kul TRAY-kee-LEK-toh-mee)
    Pronunciation of dictionary term "radical trachelectomy"
    Surgery to remove the cervix, nearby tissue, and the upper part of the vagina. Lymph nodes in the pelvis may also be removed. After the cervix is removed, the uterus is attached to the remaining part of the vagina. A special stitch or band is placed on the uterus to help keep the uterus closed during a pregnancy. Because the uterus, fallopian tubes, and ovaries are not removed, a radical trachelectomy may be done to treat a person with early-stage cervical cancer who wants to become pregnant in the future. Also called radical cervicectomy.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
  radical vulvectomy: (RA-dih-kul vul-VEK-toh-mee)
    Pronunciation of dictionary term "radical vulvectomy"
    Surgery to remove the entire vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina) and nearby lymph nodes.
  radio wave: (RAY-dee-oh…)
    Pronunciation of dictionary term "radio wave"
    A type of wave made when an electric field and a magnetic field are combined. Radio waves are being studied in the treatment of several types of cancer and other conditions. The radio waves are sent through needles inserted into tumor tissue and may kill cancer cells. Radio waves are also used in MRI to create detailed images of areas inside the body.
  radioactive: (RAY-dee-oh-AK-tiv)
    Pronunciation of dictionary term "radioactive"
    Giving off radiation.
  radioactive drug: (RAY-dee-oh-AK-tiv...)
    Pronunciation of dictionary term "radioactive drug"
    A drug that contains a radioactive substance and is used to diagnose or treat disease, including cancer. Also called radiopharmaceutical.
  radioactive fallout: (RAY-dee-oh-AK-tiv...)
    Pronunciation of dictionary term "radioactive fallout"
    Airborne radioactive particles that fall to the ground during and after an atomic bombing, nuclear weapons test, or nuclear plant accident.
  radioactive glucose: (RAY-dee-oh-AK-tiv GLOO-kose)
    Pronunciation of dictionary term "radioactive glucose"
    A radioactive form of glucose (sugar) often used during a positive emission tomography (PET) scan, a type of imaging test. In PET, a small amount of radioactive glucose is injected into a vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they are more active and take up more glucose than normal cells do. When used with PET, radioactive glucose helps find cancer cells in the body.
  radioactive iodine: (RAY-dee-oh-AK-tiv I-oh-dine)
    Pronunciation of dictionary term "radioactive iodine"
    A radioactive form of iodine, often used for imaging tests or to treat an overactive thyroid, thyroid cancer, and certain other cancers. For imaging tests, the patient takes a small dose of radioactive iodine that collects in thyroid cells and certain kinds of tumors and can be detected by a scanner. To treat thyroid cancer, the patient takes a large dose of radioactive iodine, which kills thyroid cells. Radioactive iodine is also used in internal radiation therapy for prostate cancer, intraocular (eye) melanoma, and carcinoid tumors. Radioactive iodine is given by mouth as a liquid or in capsules, by infusion, or sealed in seeds, which are placed in or near the tumor to kill cancer cells.
  radioactive palladium: (RAY-dee-oh-AK-tiv puh-LAY-dee-um)
    Pronunciation of dictionary term "radioactive palladium"
    A radioactive form of palladium (a metallic element that resembles platinum). When used to treat prostate cancer, radioactive seeds (small pellets that contain radioactive palladium) are placed in the prostate. Cancer cells are killed by the energy given off as the radioactive material breaks down and becomes more stable.
  radioactive seed: (RAY-dee-oh-AK-tiv...)
    Pronunciation of dictionary term "radioactive seed"
    A small, radioactive pellet that is placed in or near a tumor. Cancer cells are killed by the energy given off as the radioactive material breaks down and becomes more stable.
    Radioactive seeds. Small, radioactive seeds may be placed in or near a tumor to kill cancer cells.
    Radioactive seeds; drawing shows a gloved hand using an instrument to pick up small, radioactive seeds.
  radioembolization: (RAY-dee-oh-EM-boh-lih-ZAY-shun)
    Pronunciation of dictionary term "radioembolization"
    A type of radiation therapy used to treat liver cancer or cancer that has spread to the liver. A thin, flexible tube is used to inject tiny beads that hold the radioactive substance yttrium Y 90 into the main blood vessel that carries blood to the liver. The beads collect in the tumor and in blood vessels near the tumor, and the yttrium Y 90 gives off radiation. This destroys the blood vessels that the tumor needs to grow and kills the cancer cells. Radioembolization is a type of internal radiation therapy. Also called intra-arterial brachytherapy.
  radiofrequency ablation: (RAY-dee-oh-FREE-kwen-see a-BLAY-shun)
    Pronunciation of dictionary term "radiofrequency ablation"
    A procedure that uses radio waves to heat and destroy abnormal cells. The radio waves travel through electrodes (small devices that carry electricity). Radiofrequency ablation may be used to treat cancer and other conditions.
  radiofrequency radiation: (RAY-dee-oh-FREE-kwen-see RAY-dee-AY-shun)
    Pronunciation of dictionary term "radiofrequency radiation"
    A type of low-energy radiation. The most common sources of radiofrequency radiation are wireless and cellular telephones, radios, televisions, radar, satellites, microwave ovens, computers, and wireless networks (Wi-Fi). Although there have been health concerns, most types of radiofrequency radiation have not been found to cause harmful health effects, including cancer. Radiofrequency radiation is a type of non-ionizing electromagnetic radiation.
    More Information
    - Cell Phones and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/cell-phones-fact-sheet)
    - Electromagnetic Fields and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/radiation/electromagnetic-fields-fact-sheet)
  radiography: (RAY-dee-AH-gruh-fee)
    Pronunciation of dictionary term "radiography"
    A procedure that uses a type of high-energy radiation called x-rays to take pictures of areas inside the body. X-rays pass through the body onto film or a computer, where the pictures are made. The tissues and organs usually appear in various shades of black and white because different tissues allow different amounts of the x-ray beams to pass through them. Radiography is used to help diagnose disease and plan treatment. Also called x-ray imaging.
  radioimaging: (RAY-dee-oh-IH-muh-jing)
    Pronunciation of dictionary term "radioimaging"
    A method that uses radioactive substances to make pictures of areas inside the body. The radioactive substance is injected into the body, and locates and binds to specific cells or tissues, including cancer cells. Images are made using a special machine that detects the radioactive substance. Also called nuclear medicine scan.
  radioimmunoconjugate: (RAY-dee-oh-IH-myoo-noh-KON-jih-gut)
    Pronunciation of dictionary term "radioimmunoconjugate"
    A radioactive substance that carries radiation directly to cancer cells. A radioimmunoconjugate is made by attaching a radioactive molecule to an immune substance, such as a monoclonal antibody, that can bind to cancer cells. This may help kill cancer cells without harming normal cells. Radioimmunoconjugates may also be used with imaging to help find cancer cells in the body.
  radioimmunodiagnostics: (RAY-dee-oh-IH-myoo-noh-DY-ug-NOS-tix)
    Pronunciation of dictionary term "radioimmunodiagnostics"
    The use of radiolabeled monoclonal antibodies to help diagnose diseases, including cancer. The radiolabeled monoclonal antibody locates and binds to substances in the body, including cancer cells. Images are made using a special machine that detects the radioactive monoclonal antibody.
  radioimmunoguided surgery: (RAY-dee-oh-IH-myoo-noh-GY-ded SER-juh-ree)
    Pronunciation of dictionary term "radioimmunoguided surgery"
    A procedure that uses radioactive substances to locate tumors so that they can be removed by surgery.
  radioimmunotherapeutics: (RAY-dee-oh-IH-myoo-noh-THAYR-uh-PYOO-tix)
    Pronunciation of dictionary term "radioimmunotherapeutics"
    The use of radiolabeled monoclonal antibodies to treat diseases, including cancer. The radiolabeled monoclonal antibody locates and binds to substances in the body, including cancer cells. Radiation given off by the radioisotope may help kill the cancer cells.
  radioimmunotherapy: (RAY-dee-oh-IH-myoo-noh-THAYR-uh-pee)
    Pronunciation of dictionary term "radioimmunotherapy"
    A type of radiation therapy in which a radioactive substance is linked to a monoclonal antibody and injected into the body. The monoclonal antibody can bind to substances in the body, including cancer cells. The radioactive substance gives off radiation, which may help kill cancer cells. Radioimmunotherapy is being used to treat some types of cancer, such as lymphoma.
  radioisotope: (RAY-dee-oh-I-suh-tope)
    Pronunciation of dictionary term "radioisotope"
    An unstable form of a chemical element that releases radiation as it breaks down and becomes more stable. Radioisotopes may occur in nature or be made in a laboratory. In medicine, they are used in imaging tests and in treatment. Also called radionuclide.
  radiolabeled: (RAY-dee-oh-LAY-buld)
    Pronunciation of dictionary term "radiolabeled"
    Any compound that has been joined with a radioactive substance.
  radiologic exam: (RAY-dee-oh-LAH-jik eg-ZAM)
    Pronunciation of dictionary term "radiologic exam"
    A test that uses radiation or other imaging procedures to find signs of cancer or other abnormalities.
  radiologist: (RAY-dee-AH-loh-jist)
    Pronunciation of dictionary term "radiologist"
    A doctor who has special training in creating and interpreting pictures of areas inside the body. The pictures are made with x-rays, sound waves, or other types of energy.
  radiology: (RAY-dee-AH-loh-jee)
    Pronunciation of dictionary term "radiology"
    The use of radiation (such as x-rays) or other imaging technologies (such as ultrasound and magnetic resonance imaging) to diagnose or treat disease.
  radiology report: (RAY-dee-AH-loh-jee reh-PORT)
    Pronunciation of dictionary term "radiology report"
    A detailed report that describes the results of an imaging test. A radiology report includes information about the type of imaging test that was done and how it was done. It also includes a brief medical history of the person having the test, including any symptoms or known diseases and why the test was needed. The report also describes the findings seen in the areas of the body that were scanned and compares them with findings from a previous imaging test, if available. A summary of all the findings, which may be used to make a diagnosis of a disease, and any recommendations for further testing are also included in the report.
  radionuclide: (RAY-dee-oh-NOO-klide)
    Pronunciation of dictionary term "radionuclide"
    An unstable form of a chemical element that releases radiation as it breaks down and becomes more stable. Radionuclides may occur in nature or be made in a laboratory. In medicine, they are used in imaging tests and in treatment. Also called radioisotope.
  radionuclide scanning: (RAY-dee-oh-NOO-klide SKAN-ing)
    Pronunciation of dictionary term "radionuclide scanning"
    A procedure that produces pictures (scans) of structures inside the body, including areas where there are cancer cells. Radionuclide scanning is used to diagnose, stage, and monitor disease. A small amount of a radioactive chemical (radionuclide) is injected into a vein or swallowed. Different radionuclides travel through the blood to different organs. A machine with a special camera moves over the person lying on a table and detects the type of radiation given off by the radionuclides. A computer forms an image of the areas where the radionuclide builds up. These areas may contain cancer cells. Also called scintigraphy.
  radiopharmaceutical: (RAY-dee-oh-FAR-muh-SOO-tih-kul)
    Pronunciation of dictionary term "radiopharmaceutical"
    A drug that contains a radioactive substance and is used to diagnose or treat disease, including cancer. Also called radioactive drug.
  radioprotective agent: (RAY-dee-oh-proh-TEK-tiv AY-jent)
    Pronunciation of dictionary term "radioprotective agent"
    A type of drug that helps protect healthy tissue from some of the side effects caused by radiation therapy. For example, a drug called amifostine helps reduce dry mouth in patients receiving radiation therapy for head and neck cancer.
  radiosensitization: (RAY-dee-oh-SEN-sih-tih-ZAY-shun)
    Pronunciation of dictionary term "radiosensitization"
    The use of a drug that makes tumor cells more sensitive to radiation therapy.
  radiosensitizer: (RAY-dee-oh-SEN-sih-TY-zer)
    Pronunciation of dictionary term "radiosensitizer"
    Any substance that makes tumor cells easier to kill with radiation therapy. Some radiosensitizers are being studied in the treatment of cancer. Also called radiosensitizing agent.
  radiosensitizing agent: (RAY-dee-oh-SEN-sih-TY-zing AY-jent)
    Pronunciation of dictionary term "radiosensitizing agent"
    Any substance that makes tumor cells easier to kill with radiation therapy. Some radiosensitizing agents are being studied in the treatment of cancer. Also called radiosensitizer.
  radiosurgery: (RAY-dee-oh-SER-juh-ree)
    Pronunciation of dictionary term "radiosurgery"
    A type of external radiation therapy that uses special equipment to position the patient and precisely give a single large dose of radiation to a tumor. It is used to treat brain tumors and other brain disorders that cannot be treated by regular surgery. It is also being studied in the treatment of other types of cancer. Also called radiation surgery, stereotactic radiosurgery, and stereotaxic radiosurgery.
  radiotherapy: (RAY-dee-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "radiotherapy"
    The use of high-energy radiation from x-rays, gamma rays, neutrons, protons, and other sources to kill cancer cells and shrink tumors. Radiation may come from a machine outside the body (external-beam radiation therapy), or it may come from radioactive material placed in the body near cancer cells (internal radiation therapy or brachytherapy). Systemic radiotherapy uses a radioactive substance, such as a radiolabeled monoclonal antibody, that travels in the blood to tissues throughout the body. Also called irradiation and radiation therapy.
    More Information
    - Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy)
    - Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
  radium Ra 223-dichloride: (RAY-dee-um … dy-KLOR-ide)
    Pronunciation of dictionary term "radium Ra 223-dichloride"
    A radioactive drug used to treat prostate cancer that has spread to the bone and is causing symptoms but has not spread to other organs. It is used in patients whose cancer is castration resistant (has not responded to treatments that lower testosterone levels). It is also being studied in the treatment of other types of cancer. Radium Ra 223-dichloride contains a radioactive substance called radium Ra 223. It collects in bone and gives off radiation that may kill cancer cells. Radium Ra 223-dichloride is a type of radiotherapeutic agent. Also called Xofigo.
    More Information
    - Radium 223 Dichloride (https://www.cancer.gov/about-cancer/treatment/drugs/radium-223-dichloride)
  radon: (RAY-don)
    Pronunciation of dictionary term "radon"
    A radioactive gas that is released by uranium, a substance found in soil and rock. Breathing in too much radon can damage lung cells and may lead to lung cancer.
    More Information
    - Radon and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/radon/radon-fact-sheet)
  Raftilose Synergy 1: (RAF-tih-lose SIH-ner-jee ...)
    Pronunciation of dictionary term "Raftilose Synergy 1"
    A substance that is used to improve the health of the digestive system and bones and is being studied in the prevention of colon cancer. Raftilose Synergy 1 is made by combining two substances that occur naturally in many plants, including chicory root, wheat, bananas, onion, and garlic. Raftilose Synergy 1 helps healthy bacteria grow in the intestines and helps the body absorb calcium and magnesium. Also called oligofructose-enriched inulin.
  raloxifene: (ra-LOK-sih-feen)
    Pronunciation of dictionary term "raloxifene"
    The active ingredient in a drug used to reduce the risk of invasive breast cancer in postmenopausal women who are at high risk of the disease or who have osteoporosis. It is also used to prevent and treat osteoporosis in postmenopausal women. Raloxifene is also being studied in the treatment of other types of cancer. It blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. It may also help keep bone from breaking down. Raloxifene is a type of selective estrogen receptor modulator (SERM).
    More Information
    - Raloxifene Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/raloxifenehydrochloride)
  raloxifene hydrochloride: (ra-LOK-sih-feen HY-droh-KLOR-ide)
    Pronunciation of dictionary term "raloxifene hydrochloride"
    A drug used to reduce the risk of invasive breast cancer in postmenopausal women who are at high risk of developing the disease or who have osteoporosis and to prevent and treat osteoporosis in postmenopausal women. Raloxifene hydrochloride is also being studied in the treatment of other types of cancer. It blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. Raloxifene hydrochloride may also help keep bone from breaking down. It is a type of selective estrogen receptor modulator (SERM). Raloxifene is the active ingredient of raloxifene hydrochloride. Also called Evista.
    More Information
    - Raloxifene Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/raloxifenehydrochloride)
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  raltitrexed: (RAL-tih-TREK-sed)
    Pronunciation of dictionary term "raltitrexed"
    An anticancer drug that stops tumor cells from growing by blocking the ability of cells to make DNA. It belongs to the family of drugs called thymidylate synthase inhibitors. Also called ICI D1694.
  ramucirumab: (RA-myoo-SIR-yoo-mab)
    Pronunciation of dictionary term "ramucirumab"
    A drug that binds to the protein vascular endothelial growth factor (VEGF) to help keep new blood vessels from forming and is used to treat different types of cancer. It is used alone or with other drugs to treat certain types of non-small cell lung cancer, hepatocellular carcinoma (a type of liver cancer), colorectal cancer, stomach cancer, and gastroesophageal junction cancer. It is also being studied in the treatment of other types of cancer. Ramucirumab may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody. Also called anti-VEGFR-2 fully human monoclonal antibody IMC-1121B, Cyramza, and IMC-1121B.
    More Information
    - Ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
  randomization: (RAN-duh-mih-ZAY-shun)
    Pronunciation of dictionary term "randomization"
    In research, the process by which participants in clinical trials are assigned by chance to separate groups that are given different treatments or other interventions. Neither the researcher nor the participant chooses which treatment or intervention the participant will receive. Using chance to assign people to groups means that the effects of the treatment or intervention that participants receive can be compared more fairly.
  randomized clinical trial: (RAN-duh-mized KLIH-nih-kul TRY-ul)
    Pronunciation of dictionary term "randomized clinical trial"
    A study in which the participants are divided by chance into separate groups that compare different treatments or other interventions. Using chance to divide people into groups means that the groups will be similar and that the effects of the treatments they receive can be compared more fairly. At the time of the trial, it is not known which treatment is best.
  ranpirnase: (RAN-per-nays)
    Pronunciation of dictionary term "ranpirnase"
    A substance being studied in the treatment of cancer. It is a type of ribonuclease enzyme. Also called Onconase.
  Rapamune: (RA-puh-MYOON)
    Pronunciation of dictionary term "Rapamune"
    A drug used to keep the body from rejecting organ and bone marrow transplants. Rapamune blocks certain white blood cells that can reject foreign tissues and organs. It also blocks a protein that is involved in cell division. It is a type of antibiotic, a type of immunosuppressant, and a type of serine/threonine kinase inhibitor. Rapamune was previously called rapamycin. Also called sirolimus.
  rapamycin: (RA-puh-MY-sin)
    Pronunciation of dictionary term "rapamycin"
    A drug used to keep the body from rejecting organ and bone marrow transplants. Rapamycin blocks certain white blood cells that can reject foreign tissues and organs. It also blocks a protein that is involved in cell division. It is a type of antibiotic, a type of immunosuppressant, and a type of serine/threonine kinase inhibitor. Rapamycin is now called sirolimus.
  rapid eye movement sleep: (RA-pid I MOOV-ment sleep)
    Pronunciation of dictionary term "rapid eye movement sleep"
    The phase of sleep in which most dreams occur. During rapid eye movement sleep, a person’s brain activity, breathing, heart rate, and blood pressure increase, and the eyes move rapidly while closed. The muscles in the arms and legs become temporarily unable to move. Rapid eye movement sleep is thought to play an important role in memory and learning. During normal sleep, a person goes through four to five sleep cycles that last about 90 minutes each and include both rapid eye movement sleep and non-rapid eye movement sleep (light to deep sleep). Also called REM sleep.
  rapid hormone cycling: (RA-pid HOR-mone SY-kuh-ling)
    Pronunciation of dictionary term "rapid hormone cycling"
    A procedure in which drugs that block the production of male hormones are alternated with male hormones and/or drugs that promote the production of male hormones. This procedure is being studied in the treatment of prostate cancer.
  rapid-onset opioid: (… OH-pee-OYD)
    Pronunciation of dictionary term "rapid-onset opioid"
    A substance that acts quickly to treat moderate to severe pain. Opioids are like opiates, such as morphine and codeine, but are not made from opium. Opioids bind to opioid receptors in the central nervous system. A rapid-onset opioid is a type of alkaloid.
  RARA gene: (… jeen)
    Pronunciation of dictionary term "RARA gene"
    A gene that makes a protein that controls the activity of certain genes that help white blood cells mature. Mutations (changes) in the RARA gene can occur when a piece of the chromosome containing the RARA gene breaks off and joins with a gene called PML on another chromosome. These changes may cause too many immature white blood cells to build up in the blood and bone marrow. This can lead to an aggressive (fast-growing) type of acute myeloid leukemia called acute promyelocytic leukemia. The protein made by the RARA gene is a type of transcription factor. Also called retinoic acid receptor alpha gene.
  rare cancer: (rayr KAN-ser)
    Pronunciation of dictionary term "rare cancer"
    As defined by the National Cancer Institute, cancer that occurs in fewer than 15 out of 100,000 people each year. Most types of cancer are considered rare, and they are often more difficult to prevent, diagnose, and treat than the more common cancers. Because there are fewer cases, research is difficult. Examples of rare cancers are anal, stomach, and laryngeal cancer.
  rare disease: (rayr dih-ZEEZ)
    Pronunciation of dictionary term "rare disease"
    A disease that affects fewer than 200,000 people in the United States. There are about 7,000 rare diseases. An estimated 25 million to 30 million Americans are living with a rare disease. The cause of many rare diseases is unknown, but they are often caused by changes in a person’s genes or chromosomes. Rare diseases are often more difficult to diagnose and treat than the more common diseases. Also called rare disorder.
    More Information
    - Genetic and Rare Diseases Information Center (GARD) (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/)
  rare disorder: (rayr dis-OR-der)
    Pronunciation of dictionary term "rare disorder"
    A disease that affects fewer than 200,000 people in the United States. There are about 7,000 rare disorders. An estimated 25 million to 30 million Americans are living with a rare disorder. The cause of many rare disorders is unknown, but they are often caused by changes in a person’s genes or chromosomes. Rare disorders are often more difficult to diagnose and treat than the more common diseases. Also called rare disease.
    More Information
    - Genetic and Rare Diseases Information Center (GARD) (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/)
  RAS gene family: (... jeen FA-mih-lee)
    Pronunciation of dictionary term "ras gene family"
    A family of genes that make proteins involved in cell signaling pathways that control cell growth and cell death. Mutated (changed) forms of the RAS gene may be found in some types of cancer. These changes may cause cancer cells to grow and spread in the body. Members of the RAS gene family include KRAS, HRAS, and NRAS.
  ras peptide: (ras PEP-tide)
    Pronunciation of dictionary term "ras peptide"
    A short piece of the ras protein, which is made by the ras gene. The ras gene has been found to cause cancer when it is mutated (changed).
  rasburicase: (ras-BYOOR-ih-kays)
    Pronunciation of dictionary term "rasburicase"
    A drug used to treat high levels of uric acid in the blood of adults and children with leukemia, lymphoma, or other types of cancer who are receiving certain types of anticancer therapy. Uric acid is a natural substance that can build up in the blood as tumors break down. Rasburicase helps break down and remove uric acid from the body. It is a type of recombinant enzyme and a type of urate-lowering drug. Also called Elitek and recombinant urate oxidase.
    More Information
    - Rasburicase (https://www.cancer.gov/about-cancer/treatment/drugs/rasburicase)
  rash: An area of the skin that has changes in texture or color and may look inflamed or irritated. The skin may be red, warm, scaly, bumpy, dry, itchy, swollen, or painful. It may also crack or blister. A rash can occur in one area of the body or all over the body and may look very different depending on the cause. It may be a sign of a specific medical condition or a side effect of a medicine or treatment. Some causes of skin rashes include allergies, infection, heat, and immune system disorders.
  RASopathy syndrome: (ras-AH-puh-thee SIN-drome)
    Pronunciation of dictionary term "RASopathy syndrome"
    A group of rare conditions caused by mutations (changes) in certain genes that make proteins involved in the Ras/MAPK cell signaling pathway. This pathway plays an important role in controlling many cell functions, including cell growth, cell maturation, and cell death. There are many different RASopathy syndromes. Most of these syndromes are marked by unusual facial features, heart defects, skin abnormalities, and problems with the eyes, muscles, and bones. There may also be gastrointestinal and nervous system problems and growth, learning, and developmental delays. Having a RASopathy syndrome may increase a person’s risk of certain types of cancer. RASopathy syndromes include cardiofaciocutaneous syndrome, Costello syndrome, Legius syndrome, neurofibromatosis type 1, Noonan syndrome, and capillary malformation-arteriovenous malformation syndrome.
  rattlesnake root: (RA-til-SNAYK root)
    Pronunciation of dictionary term "rattlesnake root"
    An eastern North American perennial herb. A substance obtained from the root of the plant has been used in some cultures to treat a number of medical problems. It is being studied in the treatment of hot flashes and other symptoms of menopause. The scientific name is Cimicifuga racemosa. Also called black cohosh, black snakeroot, bugbane, and bugwort.
    More Information
    - Black Cohosh
  rauschpfeffer: (ROWSH-feh-fer)
    Pronunciation of dictionary term "rauschpfeffer"
    An herb native to islands in the South Pacific. Substances taken from the root have been used in some cultures to relieve stress, anxiety, tension, sleeplessness, and problems of menopause. Rauschpfeffer may increase the effect of alcohol and of certain drugs used to treat anxiety and depression. The U.S. Food and Drug Administration advises users that rauschpfeffer may cause severe liver damage. The scientific name is Piper methysticum. Also called intoxicating pepper, kava kava, tonga, and yangona.
  RAV12: A monoclonal antibody that is being studied in the treatment of some types of cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to cancer cells. It binds to a carbohydrate (sugar) molecule that is found on gastric, colon, pancreatic, prostate, ovarian, breast, and kidney cancer cells.
  ravuconazole: (RA-vuh-KAH-nuh-zole)
    Pronunciation of dictionary term "ravuconazole"
    A substance that is being studied in the treatment of infections caused by fungi. It belongs to the family of drugs called antifungal agents.
  ravulizumab: (RAV-yoo-LIZ-yoo-mab)
    Pronunciation of dictionary term "ravulizumab"
    A drug used to treat adults with paroxysmal nocturnal hemoglobinuria (a rare red blood cell disorder) and adults and children aged 1 month and older with atypical hemolytic uremic syndrome (a very rare disorder in which tiny blood clots form in small blood vessels). It is also being studied in the treatment of other conditions. Ravulizumab binds to an immune system protein called C5. This may help keep red blood cells from breaking down and blood clots from forming. Ravulizumab is a type of monoclonal antibody. Also called Ultomiris.
    More Information
    - Ravulizumab-cwvz (https://www.cancer.gov/about-cancer/treatment/drugs/ravulizumab-cwvz)
  RBC: A type of blood cell that is made in the bone marrow and found in the blood. RBCs contain a protein called hemoglobin, which carries oxygen from the lungs to all parts of the body. Checking the number of RBCs in the blood is usually part of a complete blood cell (CBC) test. It may be used to look for conditions such as anemia, dehydration, malnutrition, and leukemia. Also called erythrocyte and red blood cell.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  reactivate: (ree-AK-tih-VAYT)
    Pronunciation of dictionary term "reactivate"
    To make active again or make something work again. In medicine, an infection or a disease is described as reactivated when it comes back after a period with no signs of disease.
  reactive oxygen species: (ree-AK-tive OK-sih-jen SPEE-sees)
    Pronunciation of dictionary term "reactive oxygen species"
    A type of unstable molecule that contains oxygen and that easily reacts with other molecules in a cell. A build up of reactive oxygen species in cells may cause damage to DNA, RNA, and proteins, and may cause cell death. Reactive oxygen species are free radicals. Also called oxygen radical.
    More Information
    - Antioxidants and Cancer Prevention (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/antioxidants-fact-sheet)
  reagent: (ree-AY-jent)
    Pronunciation of dictionary term "reagent"
    A substance used to carry out a laboratory test. Reagents may be used in a chemical reaction to detect, measure, or make other substances.
  rebeccamycin: (reh-BEH-kuh-MY-sin)
    Pronunciation of dictionary term "rebeccamycin"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called antineoplastic antibiotics.
  rebeccamycin analog: (reh-BEH-kuh-MY-sin A-nuh-log)
    Pronunciation of dictionary term "rebeccamycin analog"
    A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called antitumor antibiotics and topoisomerase inhibitors. Also called NSC 655649.
  Reblozyl: (REB-loh-zil)
    Pronunciation of dictionary term "Reblozyl"
    A drug used to treat anemia in adults with certain types of myelodysplastic syndromes or myelodysplastic/myeloproliferative neoplasms who need regular red blood cell transfusions and whose anemia did not respond to or cannot be treated with an erythropoiesis-stimulating agent. Reblozyl is also used to treat anemia in adults with beta thalassemia (an inherited blood disorder) who need regular red blood cell transfusions. It is also being studied in the treatment of other conditions. Reblozyl helps the bone marrow make more red blood cells. It is a type of antianemic and a type of recombinant fusion protein. Also called luspatercept.
    More Information
    - Luspatercept-aamt (https://www.cancer.gov/about-cancer/treatment/drugs/luspatercept-aamt)
  recall bias: (REE-kawl BY-us)
    Pronunciation of dictionary term "recall bias"
    A type of bias that occurs when participants in a research study or clinical trial do not accurately remember a past event or experience or leave out details when reporting about them. Recall bias is more likely to occur when the event happened a long time ago or when the study participant has a poor memory. Other factors that could affect recall bias are the participant’s age, disease status, education, socioeconomic status, pre-existing beliefs, and how important the event being recalled is to the participant. Recall bias can lead to wrong conclusions about what the study showed. It can occur in studies that ask participants to provide information from memory, such as in case-control studies or retrospective cohort studies.
  Recentin: (reh-SEN-tin)
    Pronunciation of dictionary term "Recentin"
    A substance being studied in the treatment of some types of cancer. Recentin may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of antiangiogenesis agent and a type of vascular endothelial growth factor (VEGF) receptor tyrosine kinase inhibitor. Also called AZD2171 and cediranib maleate.
  receptor: (reh-SEP-ter)
    Pronunciation of dictionary term "receptor"
    A molecule inside or on the surface of a cell that binds to a specific substance and causes a specific effect in the cell.
  receptor tyrosine kinase: (reh-SEP-ter TY-ruh-seen KY-nays)
    Pronunciation of dictionary term "receptor tyrosine kinase"
    A member of a group of proteins called tyrosine kinases that are found on the surface of cells. Receptor tyrosine kinases play an important role in many cell functions, including cell-to-cell communication and cell division, maturation, movement, metabolism, and survival. Sometimes, the genes that make receptor tyrosine kinases have mutations (changes) that cause receptor tyrosine kinases to be overactive or be found in higher-than-normal amounts. This may cause cancer cells to grow. Drugs that block the mutant receptor tyrosine kinases are being used to treat some types of cancer. Also called RTK.
  recipient: (reh-SIH-pee-ent)
    Pronunciation of dictionary term "recipient"
    In medicine, a person who receives blood, cells, tissue, or an organ from another person, such as in a blood transfusion or an organ transplant.
  RECIST: A standard way to measure how well a cancer patient responds to treatment. It is based on whether tumors shrink, stay the same, or get bigger. To use RECIST, there must be at least one tumor that can be measured on x-rays, CT scans, or MRI scans. The types of response a patient can have are a complete response (CR), a partial response (PR), progressive disease (PD), and stable disease (SD). Also called Response Evaluation Criteria In Solid Tumors.
  recombinant: (ree-KOM-bih-nunt)
    Pronunciation of dictionary term "recombinant"
    In genetics, describes DNA, proteins, cells, or organisms that are made by combining genetic material from two different sources. Recombinant substances are made in the laboratory and are being studied in the treatment of cancer and for many other uses.
  recombinant adenovirus-p53: (ree-KOM-bih-nunt A-den-oh-VY-rus ...)
    Pronunciation of dictionary term "recombinant adenovirus-p53"
    A substance that has been studied in the treatment of some types of cancer. Recombinant adenovirus-p53 is a weakened adenovirus that carries the p53 gene into tumor cells, causing them to die. It is a type of gene therapy. Also called ACN53, rAd/p53, and SCH-58500.
  recombinant fowlpox-CEA-MUC-1-TRICOM vaccine: (ree-KOM-bih-nunt … vak-SEEN)
    Pronunciation of dictionary term "recombinant fowlpox-CEA-MUC-1-TRICOM vaccine"
    A cancer vaccine made with a form of a chicken virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called falimarev.
  recombinant fowlpox-TRICOM vaccine: (ree-KOM-bih-nunt … vak-SEEN)
    Pronunciation of dictionary term "recombinant fowlpox-TRICOM vaccine"
    A cancer vaccine made with a form of a chicken virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called rF-TRICOM.
  recombinant human interleukin-11: (ree-KOM-bih-nunt HYOO-mun in-ter-LOO-kin...)
    Pronunciation of dictionary term "recombinant human interleukin-11"
    A drug used to increase the number of blood cells, especially platelets, in some cancer patients receiving chemotherapy. Recombinant human interleukin-11 is a form of interleukin-11 (a cytokine normally made by support cells in the bone marrow) that is made in the laboratory. It is a type of biological response modifier. Also called Neumega, oprelvekin, and rhIL-11.
  recombinant human interleukin-2: (ree-KOM-bih-nunt HYOO-mun in-ter-LOO-kin...)
    Pronunciation of dictionary term "recombinant human interleukin-2"
    A drug used to treat adults with melanoma or renal cell carcinoma (a type of kidney cancer) that has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Recombinant human interleukin-2 is a form of interleukin-2 that is made in the laboratory. Recombinant human interleukin-2 increases the activity and growth of white blood cells called T lymphocytes and B lymphocytes, which may help the immune system kill cancer cells. Recombinant human interleukin-2 is a type of cytokine and a type of immunomodulating agent. Also called aldesleukin and Proleukin.
    More Information
    - Aldesleukin (https://www.cancer.gov/about-cancer/treatment/drugs/aldesleukin)
  recombinant human methionyl stem cell factor: (ree-KOM-bih-nunt HYOO-mun meh-THY-oh-nil stem sel FAK-ter)
    Pronunciation of dictionary term "recombinant human methionyl stem cell factor"
    A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. It is being studied in the treatment of myelodysplasia. Recombinant human methionyl stem cell factor is a type of recombinant stem cell growth factor. Also called ancestim, r-metHuSCF, and Stemgen.
  recombinant human papillomavirus bivalent vaccine: (ree-KOM-bih-nunt HYOO-mun PA-pih-LOH-muh-VY-rus by-VAY-lent vak-SEEN)
    Pronunciation of dictionary term "recombinant human papillomavirus bivalent vaccine"
    A vaccine that is no longer available in the United States but is still used in other countries to protect against infection with two types of human papillomavirus (HPV). Recombinant human papillomavirus bivalent vaccine is used in females aged 9 to 25 years to protect against high-risk HPV types 16 and 18, which most often cause cervical cancer and lesions that may become cervical cancer. Recombinant human papillomavirus bivalent vaccine may also prevent other HPV-related cancers. Also called Cervarix.
    More Information
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
    - Recombinant Human Papillomavirus (HPV) Bivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-bivalent-vaccine)
  recombinant human papillomavirus nonavalent vaccine: (ree-KOM-bih-nunt HYOO-mun PA-pih-LOH-muh-VY-rus NOH-nuh-VAY-lent vak-SEEN)
    Pronunciation of dictionary term "recombinant human papillomavirus nonavalent vaccine"
    A vaccine that is FDA-approved for use in females and males aged 9 to 45 years to protect against infection with nine types of human papillomavirus (HPV). Recombinant human papillomavirus nonavalent vaccine protects against low-risk HPV types 6 and 11, which cause most genital warts, and against high-risk HPV types 16, 18, 31, 33, 45, 52, and 58, which cause most precancerous lesions and cancers of the cervix, vagina, vulva, anus, and head and neck, including the oropharynx. Recombinant human papillomavirus nonavalent vaccine may also prevent HPV-related cancer of the penis. Also called Gardasil 9.
    More Information
    - Recombinant Human Papillomavirus (HPV) Nonavalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-nonavalent-vaccine)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  recombinant human papillomavirus quadrivalent vaccine: (ree-KOM-bih-nunt HYOO-mun PA-pih-LOH-muh-VY-rus KWAH-drih-VAY-lent vak-SEEN)
    Pronunciation of dictionary term "recombinant human papillomavirus quadrivalent vaccine"
    A vaccine that is no longer available in the United States but is still used in other countries to protect against infection with four types of human papillomavirus (HPV). Recombinant human papillomavirus quadrivalent vaccine is used in females and males aged 9 to 26 years to protect against low-risk HPV types 6 and 11, which cause most genital warts, and against high-risk HPV types 16 and 18, which cause most precancerous lesions and cancers of the cervix, vagina, vulva, and anus. Recombinant human papillomavirus quadrivalent vaccine may also prevent HPV-related cancers of the penis and oropharynx. Also called Gardasil.
    More Information
    - Recombinant Human Papillomavirus (HPV) Quadrivalent Vaccine (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-quadrivalent-vaccine)
    - Human Papillomavirus (HPV) Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet)
  recombinant interferon alfa-2b: (ree-KOM-bih-nunt in-ter-FEER-on AL-fuh …)
    Pronunciation of dictionary term "recombinant interferon alfa-2b"
    A drug used alone or with other drugs to treat adults with AIDS-related Kaposi sarcoma, hairy cell leukemia, certain types of follicular lymphoma or melanoma, genital warts or perianal warts, or chronic hepatitis B or C. It is also being studied in the treatment of other types of cancer and other conditions. Recombinant interferon alfa-2b is a form of interferon alfa (a substance normally made by cells in the immune system) that is made in the laboratory. It is a type of cytokine and a type of immunomodulating agent. Also called IFN alpha-2B, interferon alfa-2b, and Intron A.
    More Information
    - Recombinant Interferon Alfa-2b (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-interferon-alfa-2b)
  recombinant tissue plasminogen activator: (ree-KOM-bih-nunt TIH-shoo plaz-MIN-oh-jen AK-tih-vay-ter)
    Pronunciation of dictionary term "recombinant tissue plasminogen activator"
    A form of tissue plasminogen activator that is made in the laboratory. It helps dissolve blood clots and is used to treat heart attacks, strokes, and clots in the lungs. It is also being studied in the treatment of cancer. It is a type of systemic thrombolytic agent. Also called Activase, Alteplase, and r-tPA.
  recombinant urate oxidase: (ree-KOM-bih-nunt YOOR-ayt OK-sih-days)
    Pronunciation of dictionary term "recombinant urate oxidase"
    A drug used to treat high levels of uric acid in the blood of adults and children with leukemia, lymphoma, or other types of cancer who are receiving certain types of anticancer therapy. Uric acid is a natural substance that can build up in the blood as tumors break down. Recombinant urate oxidase helps break down and remove uric acid from the body. It is a type of recombinant enzyme and a type of urate-lowering drug. Also called Elitek and rasburicase.
    More Information
    - Rasburicase (https://www.cancer.gov/about-cancer/treatment/drugs/rasburicase)
  recombinant vaccinia-CEA-MUC-1-TRICOM vaccine: (ree-KOM-bih-nunt vak-SIH-nee-uh … vak-SEEN)
    Pronunciation of dictionary term "recombinant vaccinia-CEA-MUC-1-TRICOM vaccine"
    A cancer vaccine made with a form of vaccinia virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins, including the tumor markers called CEA and MUC-1, that may help immune cells in the body kill tumor cells. Also called inalimarev and PANVAC-V.
  recombinant vaccinia-TRICOM vaccine: (ree-KOM-bih-nunt vak-SIH-nee-uh … vak-SEEN)
    Pronunciation of dictionary term "recombinant vaccinia-TRICOM vaccine"
    A cancer vaccine made with a form of a vaccinia virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called rV-TRICOM and vaccinia-TRICOM vaccine.
  reconstructive surgeon: (REE-kun-STRUK-tiv SER-jun)
    Pronunciation of dictionary term "reconstructive surgeon"
    A doctor who can surgically reshape or rebuild (reconstruct) a part of the body, such as a woman's breast after surgery for breast cancer.
  reconstructive surgery: (REE-kun-STRUK-tiv SER-juh-ree)
    Pronunciation of dictionary term "reconstructive surgery"
    Surgery that is done to reshape or rebuild (reconstruct) a part of the body changed by previous surgery.
  recover: (ree-KUH-ver)
    Pronunciation of dictionary term "recover"
    To become well and healthy again.
  RECQL4 gene: (... jeen)
    Pronunciation of dictionary term "RECQL4 gene"
    A gene that makes a protein involved in unwinding strands of DNA that are to be copied prior to cell division and in repairing damaged DNA. Mutations (changes) in the RECQL4 gene have been found in certain inherited conditions, including Rothmund-Thomson syndrome (RTS). People with RTS have an increased risk of developing certain types of cancer at an early age, including bone cancer and skin cancer.
    More Information
    - RECQL4 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/recql4/)
  recreational therapy: (REH-kree-AY-shuh-nul THAYR-uh-pee)
    Pronunciation of dictionary term "recreational therapy"
    A type of therapy that uses activities to help meet the physical and emotional needs of patients with an illness or disability and help them develop skills for daily living. These activities include arts and crafts, music, spending time with animals, sports, and drama. Recreational therapy is being studied as a way to relieve distress in cancer patients who are being treated for pain.
  rectal: (REK-tul)
    Pronunciation of dictionary term "rectal"
    By or having to do with the rectum. The rectum is the last several inches of the large intestine closest to the anus.
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
  rectal cancer: (REK-tul KAN-ser)
    Pronunciation of dictionary term "rectal cancer"
    Cancer that forms in the tissues of the rectum (the last several inches of the large intestine closest to the anus).
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
  rectal reconstruction: (REK-tul REE-kun-STRUK-shun)
    Pronunciation of dictionary term "rectal reconstruction"
    Surgery to rebuild the rectum (the last several inches of the large intestine before the anus) using a section of the colon. This may be done when the rectum has been removed to treat cancer or other diseases.
  rectitis: (rek-TY-tis)
    Pronunciation of dictionary term "rectitis"
    Inflammation of the mucous membrane that lines the rectum (the last several inches of the large intestine closest to the anus). Also called proctitis.
  rectovaginal exam: (REK-toh-VA-jih-nul eg-ZAM)
    Pronunciation of dictionary term "rectovaginal exam"
    A physical exam of the rectum and vagina. During a rectovaginal exam, a health care provider inserts one lubricated, gloved finger into the vagina and another finger of the same hand into the rectum, and presses on the lower abdomen with the other hand. This allows the health care provider to feel for lumps or other abnormal changes in the rectum and vagina and to check the size, shape, and position of the pelvic organs, including the ovaries, fallopian tubes, uterus, and the ligaments that hold the uterus in place. A small sample of stool may be collected to check for blood. A rectovaginal exam may be done as part of a pelvic exam.
  rectum: (REK-tum)
    Pronunciation of dictionary term "rectum"
    The last several inches of the large intestine closest to the anus.
    More Information
    - Colorectal Cancer (https://www.cancer.gov/types/colorectal)
    Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.
  recur: (ree-KER)
    Pronunciation of dictionary term "recur"
    To come back or to return.
    More Information
    - When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns)
  recurrence: (ree-KER-ents)
    Pronunciation of dictionary term "recurrence"
    Cancer that has recurred (come back), usually after a period of time during which the cancer could not be detected. The cancer may come back to the same place as the original (primary) tumor or to another place in the body. Also called recurrent cancer.
    More Information
    - When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns)
  recurrent cancer: (ree-KER-ent KAN-ser)
    Pronunciation of dictionary term "recurrent cancer"
    Cancer that has recurred (come back), usually after a period of time during which the cancer could not be detected. The cancer may come back to the same place as the original (primary) tumor or to another place in the body. Also called recurrence.
    More Information
    - When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns)
  recurrent respiratory papillomatosis: (ree-KER-ent RES-pih-ruh-TOR-ee PA-pih-LOH-muh-TOH-sis)
    Pronunciation of dictionary term "recurrent respiratory papillomatosis"
    A rare condition in which wart-like growths called papillomas grow in the respiratory tract (air passages leading from the nose and mouth into the lungs). The papillomas most often grow in the larynx (voice box) and vocal cords. They can grow quickly, and they often grow back after they have been removed by surgery. Signs and symptoms of recurrent respiratory papillomatosis include hoarseness, chronic cough, swallowing problems, and breathing problems, which may sometimes be life-threatening. Recurrent respiratory papillomatosis is caused by infection with certain types of human papillomavirus (HPV). It can occur in both children and adults. Also called RRP.
  red blood cell: (red blud sel)
    Pronunciation of dictionary term "red blood cell"
    A type of blood cell that is made in the bone marrow and found in the blood. Red blood cells contain a protein called hemoglobin, which carries oxygen from the lungs to all parts of the body. Checking the number of red blood cells in the blood is usually part of a complete blood cell (CBC) test. It may be used to look for conditions such as anemia, dehydration, malnutrition, and leukemia. Also called erythrocyte and RBC.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  red cedar: (red SEE-der)
    Pronunciation of dictionary term "red cedar"
    A type of evergreen tree with hard fragrant wood that is a member of the cypress family. The oil from the wood is used in soaps, shampoos, bath salts, perfumes, aromatherapy, and to keep insects away. The scientific name is Juniperus virginiana. Also called cedarwood and Eastern red cedar.
  red clover: (red KLOH-ver)
    Pronunciation of dictionary term "red clover"
    Trifolium pratense. A plant with flowers that has been used in some cultures to treat certain medical problems. It is being studied in the relief of menopausal symptoms and may have anticancer effects. Also called purple clover, Trifolium pratense, and wild clover.
  red date: (red dayt)
    Pronunciation of dictionary term "red date"
    The fruit of the jujube plant. It has been used in some cultures to treat certain medical problems.
  red elm: (red elm)
    Pronunciation of dictionary term "red elm"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called gray elm, Indian elm, slippery elm, sweet elm, Ulmus fulva, and Ulmus rubra.
  redox: (REE-dox)
    Pronunciation of dictionary term "redox"
    A chemical reaction that takes place between an oxidizing substance and a reducing substance. The oxidizing substance loses electrons in the reaction, and the reducing substance gains electrons. For example, rust forms when there is a redox reaction between oxygen contained in water or moist air (an oxidizing substance) and iron (a reducing substance). Redox reactions also occur when glucose (a type of sugar) and fat are broken down in the body to make energy. Also called oxidation-reduction.
  reduced penetrance: (ree-DOOST PEH-neh-trunts)
    Pronunciation of dictionary term "reduced penetrance"
    A term that describes when some people with a disease-causing mutation (change) in a gene develop the disease while others don’t. For example, certain gene mutations cause cancer, but because of reduced penetrance, not everyone who has the mutation will develop cancer. Currently, there is no way to know which people who have a cancer-causing gene mutation will develop cancer. Also called incomplete penetrance.
  reduced-intensity transplant: (ree-DOOST-in-TEN-sih-tee TRANZ-plant)
    Pronunciation of dictionary term "reduced-intensity transplant"
    A type of donor stem cell transplant in which a patient receives lower doses of chemotherapy and/or radiation therapy than in a standard transplant. The lower doses of anticancer therapy do not kill all of the blood-forming stem cells or all of the cancer cells in the patient's bone marrow. However, the anticancer therapy is still strong enough to suppress the patient's immune system and prevent rejection of the donor stem cells. The patient’s stem cells and those from the donor both live in the patient’s body for a time after a reduced-intensity transplant. Once the cells from the donor begin to grow and divide in the bone marrow, they replace the patient’s own bone marrow cells and destroy the remaining cancer cells. A reduced-intensity transplant may be an option for certain people who are older or who are not healthy enough to receive a standard donor stem cell transplant with high-dose chemotherapy. Also called mini-transplant and non-myeloablative transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  reduction: (ree-DUK-shun)
    Pronunciation of dictionary term "reduction"
    A chemical reaction that takes place when a substance comes into contact with hydrogen or another reducing substance.
  Reed-Sternberg cell: (reed-STERN-berg sel)
    Pronunciation of dictionary term "Reed-Sternberg cell"
    A type of cell that appears in people with Hodgkin disease. The number of these cells increases as the disease advances. Also called Hodgkin and Reed-Sternberg cell.
    Reed-Sternberg cell. Reed-Sternberg cells are large, abnormal lymphocytes (a type of white blood cell) that may contain more than one nucleus. These cells are found in people with Hodgkin lymphoma. Reed-Sternberg cells are also called Hodgkin and Reed-Sternberg cells.
    Reed-Sternberg cell; photograph shows normal lymphocytes compared with a Reed-Sternberg cell.
  reference interval: (REH-frents IN-ter-vul)
    Pronunciation of dictionary term "reference interval"
    In medicine, a set of values that a doctor uses to interpret a patient’s test results. The reference interval for a given test is based on the results that are seen in 95% of the healthy population. Sometimes patients whose test results are outside of the reference interval may be healthy, and some patients whose test results are within the reference interval may have a health problem. The reference interval for a test may be different for different groups of people (for example, men and women). Also called normal range, reference range, and reference values.
  reference range: (REH-frents raynj)
    Pronunciation of dictionary term "reference range"
    In medicine, a set of values that a doctor uses to interpret a patient’s test results. The reference range for a given test is based on the results that are seen in 95% of the healthy population. Sometimes patients whose test results are outside of the reference range may be healthy, and some patients whose test results are within the reference range may have a health problem. The reference range for a test may be different for different groups of people (for example, men and women). Also called normal range, reference interval, and reference values.
  reference values: (REH-frents VAL-yooz)
    Pronunciation of dictionary term "reference values"
    In medicine, a set of values that a doctor uses to interpret a patient’s test results. The reference values for a given test are based on the results that are seen in 95% of the healthy population. Sometimes patients whose test results are outside of the reference values may be healthy, and some patients whose test results are within the reference values may have a health problem. The reference values for a test may be different for different groups of people (for example, men and women). Also called normal range, reference interval, and reference range.
  referral: (reh-FER-ul)
    Pronunciation of dictionary term "referral"
    In medicine, the act of sending a patient from one health care provider to another for additional health care services. For example, a primary care doctor may refer a patient to a specialist for further diagnosis and treatment.
  reflexology: (ree-flek-SAH-loh-jee)
    Pronunciation of dictionary term "reflexology"
    A type of massage in which different amounts of pressure are applied to specific points on the feet or hands. These points are believed to match up with certain other parts of the body. Reflexology is claimed to cause relaxation and healing in those parts of the body, but this has not been proven.
  reflux: (REE-fluks)
    Pronunciation of dictionary term "reflux"
    The backward flow of liquid from the stomach into the esophagus.
  refractory: (reh-FRAK-tor-ee)
    Pronunciation of dictionary term "refractory"
    In medicine, describes a disease or condition that does not respond to treatment.
  refractory cancer: (reh-FRAK-tor-ee KAN-ser)
    Pronunciation of dictionary term "refractory cancer"
    Cancer that does not respond to treatment. The cancer may be resistant at the beginning of treatment or it may become resistant during treatment. Also called resistant cancer.
  Regenecare: (reh-JEH-neh-KAYR)
    Pronunciation of dictionary term "Regenecare"
    A substance being studied in the treatment of certain types of skin rash and skin pain in cancer patients. The ingredients of Regenecare are collagen, aloe vera, vitamin E, and lidocaine. It may help stop bleeding, form new blood vessels, keep the skin moist, and relieve pain and itching. It is a type of topical anesthetic and a type of wound repair agent.
  regeneration: (ree-JEH-neh-RAY-shun)
    Pronunciation of dictionary term "regeneration"
    In biology, regrowth of damaged or destroyed tissue or body part.
  regimen: (REH-jih-men)
    Pronunciation of dictionary term "regimen"
    A treatment plan that specifies the dosage, the schedule, and the duration of treatment.
  regional: (REE-juh-nul)
    Pronunciation of dictionary term "regional"
    In oncology, describes the body area right around a tumor.
  regional anesthesia: (REE-juh-nul A-nes-THEE-zhuh)
    Pronunciation of dictionary term "regional anesthesia"
    A temporary loss of feeling or awareness in a part of the body, such as an arm or a leg, caused by special drugs or other substances called anesthetics. The patient stays awake but has no feeling in the part of the body treated with the anesthetic.
  regional cancer: (REE-juh-nul KAN-ser)
    Pronunciation of dictionary term "regional cancer"
    Refers to cancer that has grown beyond the original (primary) tumor to nearby lymph nodes or organs and tissues.
  regional chemotherapy: (REE-juh-nul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "regional chemotherapy"
    Treatment with anticancer drugs directed to a specific area of the body.
  regional enteritis: (REE-juh-nul EN-teh-RY-tis)
    Pronunciation of dictionary term "regional enteritis"
    A condition in which the gastrointestinal tract is inflamed over a long period of time. Regional enteritis usually affects the small intestine and colon. Symptoms include fever, diarrhea, stomach cramps, vomiting, and weight loss. Regional enteritis increases the risk of colorectal cancer and small intestine cancer. It is a type of inflammatory bowel disease (IBD). Also called Crohn disease.
  regional lymph node: (REE-juh-nul limf node)
    Pronunciation of dictionary term "regional lymph node"
    In oncology, a lymph node that drains lymph from the region around a tumor.
  regional lymph node dissection: (REE-juh-nul limf node dy-SEK-shun)
    Pronunciation of dictionary term "regional lymph node dissection"
    A surgical procedure to remove some of the lymph nodes that drain lymph from the area around a tumor. The lymph nodes are then examined under a microscope to see if cancer cells have spread to them.
  registered dietitian: (...dy-eh-TIH-shun)
    Pronunciation of dictionary term "registered dietitian"
    A health professional who has special training in diet and nutrition. Registered dietitians offer advice on nutrition and healthy eating habits to help people improve their health and well-being. Registered dietitians also help people who are recovering from illness or surgery or who have medical conditions, such as food allergies, eating disorders, swallowing problems, diabetes, heart or kidney disease, or cancer, meet their nutritional needs. Registered dietitians may provide nutritional counseling, meal planning, medical nutrition therapy (such as a special diet, dietary supplements, or intravenous or tube feedings), and nutrition education programs. Also called dietitian.
  Reglan: (REG-lun)
    Pronunciation of dictionary term "Reglan"
    A drug that increases the motility (movements and contractions) of the stomach and upper intestine. It is used to treat certain stomach problems and nausea and vomiting caused by chemotherapy. It is a type of antiemetic and a type of motility agent. Also called metoclopramide.
  regorafenib: (REH-goh-RA-feh-nib)
    Pronunciation of dictionary term "regorafenib"
    A drug used to treat certain types of colorectal cancer, gastrointestinal stromal tumors, and hepatocellular carcinoma (a type of liver cancer). It is also being studied in the treatment of other types of cancer. Regorafenib blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Regorafenib is a type of kinase inhibitor and a type of antiangiogenesis agent. Also called Stivarga.
    More Information
    - Regorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/regorafenib)
  regression: (reh-GREH-shun)
    Pronunciation of dictionary term "regression"
    A decrease in the size of a tumor or in the extent of cancer in the body.
  regulatory T cell: (REH-gyoo-luh-TOR-ee T sel)
    Pronunciation of dictionary term "regulatory T cell"
    A type of immune cell that blocks the actions of some other types of lymphocytes, to keep the immune system from becoming over-active. Regulatory T cells are being studied in the treatment of cancer. A regulatory T cell is a type of white blood cell and a type of lymphocyte. Also called suppressor T cell, T reg, and T-regulatory cell.
  rehabilitation: (REE-huh-BIH-lih-TAY-shun)
    Pronunciation of dictionary term "rehabilitation"
    In medicine, a process to restore mental and/or physical abilities lost to injury or disease, in order to function in a normal or near-normal way.
  rehabilitation services: (REE-huh-BIH-lih-TAY-shun SER-vih-ses)
    Pronunciation of dictionary term "rehabilitation services"
    Special health care services that help a person regain physical, mental, and/or cognitive (thinking and learning) abilities that have been lost or impaired as a result of disease, injury, or treatment. Rehabilitation services help people return to daily life and live in a normal or near-normal way. These services may include physical therapy, occupational therapy, speech and language therapy, cognitive therapy, and mental health rehabilitation services.
  rehabilitation specialist: (REE-huh-BIH-lih-TAY-shun SPEH-shuh-list)
    Pronunciation of dictionary term "rehabilitation specialist"
    A health care professional who helps people recover from an illness or injury and return to daily life. Examples of rehabilitation specialists are physical therapists and occupational therapists.
  relapse: (REE-laps)
    Pronunciation of dictionary term "relapse"
    The return of a disease or the signs and symptoms of a disease after a period of improvement. Relapse also refers to returning to the use of an addictive substance or behavior, such as cigarette smoking.
  relapse-free survival: (REE-laps … ser-VY-vul)
    Pronunciation of dictionary term "relapse-free survival"
    In cancer, the length of time after primary treatment for a cancer ends that the patient survives without any signs or symptoms of that cancer. In a clinical trial, measuring the relapse-free survival is one way to see how well a new treatment works. Also called DFS, disease-free survival, and RFS.
  relative odds: (REH-luh-tiv …)
    Pronunciation of dictionary term "relative odds"
    A measure of the odds of an event happening in one group compared to the odds of the same event happening in another group. In cancer research, relative odds are most often used in case-control (backward looking) studies to find out if being exposed to a certain substance or other factor increases the risk of cancer. For example, researchers may study a group of individuals with cancer (cases) and another group without cancer (controls) to see how many people in each group were exposed to a certain substance or factor. They calculate the odds of exposure in both groups and then compare the odds. A relative odds of one means that both groups had the same odds of exposure and, therefore, the exposure probably does not increase the risk of cancer. A relative odds of greater than one means that the exposure may increase the risk of cancer, and a relative odds of less than one means that the exposure may reduce the risk of cancer. Also called odds ratio.
  relative risk: (REH-luh-tiv …)
    Pronunciation of dictionary term "relative risk"
    A measure of the risk of a certain event happening in one group compared to the risk of the same event happening in another group. In cancer research, relative risk is used in prospective (forward looking) studies, such as cohort studies and clinical trials. A relative risk of one means there is no difference between two groups in terms of their risk of cancer, based on whether or not they were exposed to a certain substance or factor, or how they responded to two treatments being compared. A relative risk of greater than one or of less than one usually means that being exposed to a certain substance or factor either increases (relative risk greater than one) or decreases (relative risk less than one) the risk of cancer, or that the treatments being compared do not have the same effects. Also called risk ratio.
  relative survival rate: (REH-luh-tiv ser-VY-vul …)
    Pronunciation of dictionary term "relative survival rate"
    A way of comparing the survival of people who have a specific disease with those who don’t, over a certain period of time. This is usually five years from the date of diagnosis or the start of treatment for those with the disease. It is calculated by dividing the percentage of patients with the disease who are still alive at the end of the period of time by the percentage of people in the general population of the same sex and age who are alive at the end of the same time period. The relative survival rate shows whether the disease shortens life.
  relaxation technique: (ree-lak-SAY-shun tek-NEEK)
    Pronunciation of dictionary term "relaxation technique"
    A method used to help reduce muscle tension and stress, lower blood pressure, and control pain. Examples of relaxation techniques include tensing and relaxing muscles throughout the body, guided imagery (focusing the mind on positive images), meditation (focusing thoughts), and deep breathing exercises.
  relaxation therapy: (ree-lak-SAY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "relaxation therapy"
    A type of therapy that helps reduce muscle tension and stress, lowers blood pressure, and controls pain. It may involve tensing and relaxing muscles throughout the body. It may be used with guided imagery (focusing the mind on positive images) and meditation (focusing thoughts).
  Relenza: (reh-LEN-zuh)
    Pronunciation of dictionary term "Relenza"
    A drug used to prevent and to treat influenza virus infections. It blocks the release of the virus from infected cells. It is a type of antiviral agent. Also called zanamivir.
  religion: (reh-LIH-jun)
    Pronunciation of dictionary term "religion"
    A set of beliefs and practices that center on questions about the meaning of life and may involve the worship of a supreme being.
  Relistor: (REH-lih-stor)
    Pronunciation of dictionary term "Relistor"
    A drug used to relieve constipation caused by the use of opioids (pain killers that are like morphine). It is used in adults with pain caused by cancer or treatment for cancer or by other advanced disease. Relistor binds to opioid receptors outside the brain and may block the side effects of opioid drugs without affecting their ability to relieve pain. Relistor is a type of peripheral opioid receptor antagonist. Also called methylnaltrexone bromide.
    More Information
    - Methylnaltrexone Bromide (https://www.cancer.gov/about-cancer/treatment/drugs/methylnaltrexonebromide)
  relugolix: (reh-loo-GOH-lix)
    Pronunciation of dictionary term "relugolix"
    A drug used to treat adults with advanced prostate cancer. Relugolix binds to gonadotropin-releasing hormone (GnRH) receptors in the pituitary gland, which blocks the pituitary gland from making the hormones follicle-stimulating hormone (FSH) and luteinizing hormone (LH). This causes the testicles to stop making testosterone. Relugolix may stop the growth of cancer cells that need testosterone to grow. It is a type of GnRH antagonist. Also called Orgovyx.
    More Information
    - Relugolix (https://www.cancer.gov/about-cancer/treatment/drugs/relugolix)
  REM sleep: (… sleep)
    Pronunciation of dictionary term "REM sleep"
    The phase of sleep in which most dreams occur. During REM sleep, a person’s brain activity, breathing, heart rate, and blood pressure increase, and the eyes move rapidly while closed. The muscles in the arms and legs become temporarily unable to move. REM sleep is thought to play an important role in memory and learning. During normal sleep, a person goes through four to five sleep cycles that last about 90 minutes each and include both REM sleep and non-REM sleep (light to deep sleep). Also called rapid eye movement sleep.
  Remeron: (REH-meh-ron)
    Pronunciation of dictionary term "Remeron"
    A drug used to treat depression. Remeron increases the levels of the chemicals serotonin and norepinephrine in the brain, which helps improve mood. It is a type of antidepressant. Also called mirtazapine.
  remission: (reh-MIH-shun)
    Pronunciation of dictionary term "remission"
    A decrease in or disappearance of signs and symptoms of cancer. In partial remission, some, but not all, signs and symptoms of cancer have disappeared. In complete remission, all signs and symptoms of cancer have disappeared, although cancer still may be in the body.
  remission induction therapy: (reh-MIH-shun in-DUK-shun THAYR-uh-pee)
    Pronunciation of dictionary term "remission induction therapy"
    Initial treatment with anticancer drugs to decrease the signs or symptoms of cancer or make them disappear.
  remote brachytherapy: (ree-MOTE BRAY-kee-THAYR-uh-pee)
    Pronunciation of dictionary term "remote brachytherapy"
    A type of internal radiation treatment in which the radioactive source is removed between treatments. Also called high-dose-rate remote brachytherapy and high-dose-rate remote radiation therapy.
  renal artery: (REE-nul AR-tuh-ree)
    Pronunciation of dictionary term "renal artery"
    The main blood vessel that supplies blood to a kidney and its nearby adrenal gland and ureter. There is a renal artery for each kidney.
  renal capsule: (REE-nul KAP-sul)
    Pronunciation of dictionary term "renal capsule"
    The fibrous connective tissue that surrounds each kidney.
  renal cell adenocarcinoma: (REE-nul sel A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "renal cell adenocarcinoma"
    Cancer that begins in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Renal cell adenocarcinoma is the most common type of kidney cancer in adults. Also called hypernephroma, renal cell cancer, and renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  renal cell cancer: (REE-nul sel KAN-ser)
    Pronunciation of dictionary term "renal cell cancer"
    Cancer that begins in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Renal cell cancer is the most common type of kidney cancer in adults. Also called hypernephroma, renal cell adenocarcinoma, and renal cell carcinoma.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  renal cell carcinoma: (REE-nul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "renal cell carcinoma"
    Cancer that begins in the lining of the tiny tubes in the kidney that return filtered substances that the body needs back to the blood and remove extra fluid and waste as urine. Renal cell carcinoma is the most common type of kidney cancer in adults. Also called hypernephroma, renal cell adenocarcinoma, and renal cell cancer.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  renal collecting tubule: (REE-nul kuh-LEK-ting TOO-byool)
    Pronunciation of dictionary term "renal collecting tubule"
    The last part of a long, twisting tube that collects urine from the nephrons (cellular structures in the kidney that filter blood and form urine) and moves it into the renal pelvis and ureters. Also called collecting duct.
  renal failure: (REE-nul FAYL-yer)
    Pronunciation of dictionary term "renal failure"
    A condition in which the kidneys stop working and are not able to remove waste and extra water from the blood or keep body chemicals in balance. Acute or severe renal failure happens suddenly (for example, after an injury) and may be treated and cured. Chronic renal failure develops over many years, may be caused by conditions like high blood pressure or diabetes, and cannot be cured. Chronic renal failure may lead to total and long-lasting renal failure, called end-stage renal disease (ESRD). A person in ESRD needs dialysis (the process of cleaning the blood by passing it through a membrane or filter) or a kidney transplant. Also called kidney failure.
  renal fascia: (REE-nul FA-shuh)
    Pronunciation of dictionary term "renal fascia"
    A fibrous envelope of tissue that surrounds the kidney. Also called Gerota's capsule and Gerota's fascia.
  renal function: (REE-nul FUNK-shun)
    Pronunciation of dictionary term "renal function"
    A term used to describe how well the kidneys work. The kidneys remove waste and extra water from the blood (as urine) and help keep chemicals (such as sodium, potassium, and calcium) balanced in the body. They also make hormones that help control blood pressure and stimulate bone marrow to make red blood cells. Also called kidney function.
  renal function test: (REE-nul FUNK-shun...)
    Pronunciation of dictionary term "renal function test"
    A test in which blood or urine samples are checked for the amounts of certain substances released by the kidneys. A higher- or lower-than-normal amount of a substance can be a sign that the kidneys are not working the way they should. Also called kidney function test.
  renal glomerulus: (REE-nul gloh-MAYR-yoo-lus)
    Pronunciation of dictionary term "renal glomerulus"
    A tiny, round cluster of blood vessels within the kidneys. It filters the blood to reabsorb useful materials and remove waste as urine.
  renal pelvis: (REE-nul PEL-vus)
    Pronunciation of dictionary term "renal pelvis"
    The area at the center of the kidney. Urine collects here and is funneled into the ureter, the tube that connects the kidney to the bladder.
    More Information
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
  renal tubular acidosis: (REE-nul TOO-byoo-ler A-sih-DOH-sis)
    Pronunciation of dictionary term "renal tubular acidosis"
    A rare disorder in which structures in the kidney that filter the blood are impaired, producing urine that is more acid than normal.
  renal tubule: (REE-nul TOO-byool)
    Pronunciation of dictionary term "renal tubule"
    One of millions of tiny tubes in the kidneys that returns nutrients, fluids, and other substances that have been filtered from the blood, but the body needs, back to the blood. The remaining fluid and waste in the renal tubules become urine.
  renal vein: (REE-nul vayn)
    Pronunciation of dictionary term "renal vein"
    The main blood vessel that carries blood from the kidney and ureter to the inferior vena cava (a large vein that carries blood to the heart from the lower part of the body). There is a renal vein for each kidney.
  Renova: (ree-NOH-vuh)
    Pronunciation of dictionary term "Renova"
    A topical preparation of tretinoin that is used to treat acne. Tretinoin is a form of vitamin A.
  replicate: (REH-plih-kayt)
    Pronunciation of dictionary term "replicate"
    To make a copy or duplicate of something.
  replication cycle: (reh-plih-KAY-shun...)
    Pronunciation of dictionary term "replication cycle"
    In biology, refers to the reproduction cycle of viruses. A repliction cycle begins with the infection of a host cell and ends with the release of mature progeny virus particles.
  repotrectinib: (REE-poh-TREK-tih-nib)
    Pronunciation of dictionary term "repotrectinib"
    A drug used to treat adults with non-small cell lung cancer that has spread and has an abnormal ROS1 gene and adults and children aged 12 years and older with certain types of solid tumors that have an NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Repotrectinib blocks certain proteins involved in cell signaling and cell growth. Blocking these proteins may help keep cancer cells from growing. Repotrectinib is a type of kinase inhibitor. Also called Augtyro.
    More Information
    - Repotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/repotrectinib)
  reproductive cell: (REE-proh-DUK-tiv sel)
    Pronunciation of dictionary term "reproductive cell"
    An egg cell in females or sperm cell in males. Each mature reproductive cell contains 23 chromosomes. When an egg combines with sperm, the fertilized egg normally contains a total of 46 chromosomes. Also called gamete and sex cell.
  reproductive endocrinologist: (REE-proh-DUK-tiv EN-doh-krih-NAH-loh-jist)
    Pronunciation of dictionary term "reproductive endocrinologist"
    A doctor who has special training in the diagnosis and treatment of infertility. A reproductive endocrinologist may use surgery, medicine, or procedures, such as in vitro fertilization (IVF), to treat infertility. A reproductive endocrinologist may also use procedures, such as sperm banking and egg freezing, to help keep a person’s ability to have children. This is called fertility preservation.
    More Information
    - Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women)
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  reproductive history: (REE-proh-DUK-tiv HIH-stor-ee)
    Pronunciation of dictionary term "reproductive history"
    A collection of information about a woman’s health related to reproduction (childbearing). A reproductive history may include information about menstrual periods, the use of birth control, pregnancies, breastfeeding, and menopause. It may also include information about reproductive tract problems, fertility issues, and problems during childbirth.
    More Information
    - Reproductive History and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/reproductive-history-fact-sheet)
  reproductive hormone: (REE-proh-DUK-tiv HOR-mone)
    Pronunciation of dictionary term "reproductive hormone"
    A type of hormone involved in puberty, fertility, and sexuality. Reproductive hormones are usually made in the ovaries (in females) and testes (in males). Female reproductive hormones include estrogen and progesterone. They help develop and maintain female sex characteristics and play an important role in fertility, pregnancy, and the menstrual cycle. Male reproductive hormones, such as testosterone, help develop and maintain male sex characteristics and help make sperm in the testes. Some reproductive hormones may also be made in the laboratory and used to treat certain medical conditions.
  reproductive medicine: (REE-proh-DUK-tiv MEH-dih-sin)
    Pronunciation of dictionary term "reproductive medicine"
    A branch of medicine that specializes in fertility preservation, diagnosing and treating infertility, and other reproductive problems. Reproductive medicine also deals with issues related to puberty, menopause, contraception (birth control), and certain sexual problems.
  reproductive system: (REE-proh-DUK-tiv SIS-tem)
    Pronunciation of dictionary term "reproductive system"
    The tissues, glands, and organs involved in producing offspring (children). In women, the reproductive system includes the ovaries, the fallopian tubes, the uterus, the cervix, and the vagina. In men, it includes the prostate, the testes, and the penis.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
    Anatomy of the male reproductive and urinary systems showing the prostate, testicles, bladder, and other organs.
    Anatomy of the male reproductive and urinary systems; drawing shows front and side views of ureters, lymph nodes, rectum, bladder, prostate gland, vas deferens, urethra, penis, testicles, seminal vesicle, and ejaculatory duct.
  rescue transplant: (REH-skyoo TRANZ-plant)
    Pronunciation of dictionary term "rescue transplant"
    A method of replacing blood-forming stem cells that were destroyed by treatment with high doses of anticancer drugs or radiation therapy. The stem cells help the bone marrow recover and make healthy blood cells. A rescue transplant may allow more chemotherapy or radiation therapy to be given so that more cancer cells are killed. It is usually done using the patient’s own stem cells that were saved before treatment. Also called stem cell rescue.
  research advocate: (REE-serch AD-vuh-kut)
    Pronunciation of dictionary term "research advocate"
    A person who serves as a link between patients and scientific researchers. Research advocates help patients understand scientific information and research findings that may help them. They may also bring a patient perspective on research activities to scientific advisory boards and committees. For example, research advocates use their own experiences and the experiences of patients to work with researchers to help develop clinical trials that are safe and meet the needs of patients. They also help teach patients and their families about clinical trials and recruit patients to clinical trials.
    More Information
    - Research Advocacy at NCI (https://www.cancer.gov/about-nci/organization/oar/research-advocacy)
  research base: (REE-serch bays)
    Pronunciation of dictionary term "research base"
    Refers to the institutions, clinical staff, and patients that can take part in a clinical trial.
  research study: (REE-serch STUH-dee)
    Pronunciation of dictionary term "research study"
    A scientific study of nature that sometimes includes processes involved in health and disease. For example, clinical trials are research studies that involve people. These studies may be related to new ways to screen, prevent, diagnose, and treat disease. They may also study certain outcomes and certain groups of people by looking at data collected in the past or future.
  resectable: (ree-SEK-tuh-bul)
    Pronunciation of dictionary term "resectable"
    Able to be removed by surgery.
  resected: (ree-SEK-ted)
    Pronunciation of dictionary term "resected"
    Removed by surgery.
  resection: (ree-SEK-shun)
    Pronunciation of dictionary term "resection"
    Surgery to remove tissue or part or all of an organ.
  resectoscope: (ree-SEK-toh-skope)
    Pronunciation of dictionary term "resectoscope"
    A thin, tube-like instrument used to remove tissue from inside the body. A resectoscope has a light and a lens for viewing. It also has a tool that uses an electric current to cut, remove, or destroy tissue and control bleeding. In men, a resectoscope is inserted through the urethra into the bladder or prostate. In women, it is inserted through the vagina and cervix into the uterus. It can be used to relieve symptoms of an enlarged prostate or to treat diseases of the bladder, prostate, and uterus.
  residual disease: (ree-ZID-yoo-ul dih-ZEEZ)
    Pronunciation of dictionary term "residual disease"
    Cancer cells that remain after attempts to remove the cancer have been made.
  resin: (REH-zin)
    Pronunciation of dictionary term "resin"
    A thick substance that comes from plants or can be made in the laboratory from certain chemicals. Resins do not dissolve in water, and are used in plastics, varnishes, printing inks, medicine, and to make fabrics stiff.
  resiquimod: (reh-SIH-kwih-mod)
    Pronunciation of dictionary term "resiquimod"
    A substance being studied in the treatment of some types of skin cancer. When put on the skin, resiquimod causes some immune cells to make certain chemicals that may help them kill tumor cells. It is also being studied to find out if adding it to a tumor vaccine improves the antitumor immune response. It is a type of imidazoquinoline and a type of immunomodulator.
  resistant cancer: (reh-ZIH-stunt KAN-ser)
    Pronunciation of dictionary term "resistant cancer"
    Cancer that does not respond to treatment. The cancer may be resistant at the beginning of treatment, or it may become resistant during treatment. Also called refractory cancer.
  resorption: (ree-SORP-shun)
    Pronunciation of dictionary term "resorption"
    A process in which a substance, such as tissue, is lost by being destroyed and then absorbed by the body.
  respirator: (RES-pih-RAY-ter)
    Pronunciation of dictionary term "respirator"
    In medicine, a machine used to help a patient breathe. Also called ventilator.
  respiratory disease: (RES-pih-ruh-TOR-ee dih-ZEEZ)
    Pronunciation of dictionary term "respiratory disease"
    A type of disease that affects the lungs and other parts of the respiratory system. Respiratory diseases may be caused by infection, by smoking tobacco, or by breathing in secondhand tobacco smoke, radon, asbestos, or other forms of air pollution. Respiratory diseases include asthma, chronic obstructive pulmonary disease (COPD), pulmonary fibrosis, pneumonia, and lung cancer. Also called lung disorder and pulmonary disease.
  respiratory syncytial virus: (RES-pih-ruh-TOR-ee sin-SIH-shul VY-rus)
    Pronunciation of dictionary term "respiratory syncytial virus"
    A virus that causes respiratory infections with cold-like symptoms. Also called RSV.
  respiratory system: (RES-pih-ruh-TOR-ee SIS-tem)
    Pronunciation of dictionary term "respiratory system"
    The organs that are involved in breathing. These include the nose, throat, larynx, trachea, bronchi, and lungs. Also called respiratory tract.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  respiratory therapist: (RES-pih-ruh-TOR-ee THAYR-uh-pist)
    Pronunciation of dictionary term "respiratory therapist"
    A health professional trained to evaluate and treat people who have breathing problems or other lung disorders.
  respiratory therapy: (RES-pih-ruh-TOR-ee THAYR-uh-pee)
    Pronunciation of dictionary term "respiratory therapy"
    Exercises and treatments that help improve or restore lung function.
  respiratory tract: (RES-pih-ruh-TOR-ee trakt)
    Pronunciation of dictionary term "respiratory tract"
    The organs that are involved in breathing. These include the nose, throat, larynx, trachea, bronchi, and lungs. Also called respiratory system.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  respite care: (REH-spit kayr)
    Pronunciation of dictionary term "respite care"
    Temporary care given to a person who is unable to care for himself or herself so that the usual caregivers can have a break. Respite care may include in-home care, adult daycare, or nursing home care.
  response: (reh-SPONTS)
    Pronunciation of dictionary term "response"
    In medicine, an improvement related to treatment.
  Response Evaluation Criteria In Solid Tumors: (reh-SPONTS ee-VAL-yoo-AY-shun kry-TEER-ee-uh … SAH-lid TOO-mers)
    Pronunciation of dictionary term "Response Evaluation Criteria In Solid Tumors"
    A standard way to measure how well a cancer patient responds to treatment. It is based on whether tumors shrink, stay the same, or get bigger. To use Response Evaluation Criteria In Solid Tumors, there must be at least one tumor that can be measured on x-rays, CT scans, or MRI scans. The types of response a patient can have are a complete response (CR), a partial response (PR), progressive disease (PD), and stable disease (SD). Also called RECIST.
  response rate: (reh-SPONTS...)
    Pronunciation of dictionary term "response rate"
    The percentage of patients whose cancer shrinks or disappears after treatment.
  restaging: (ree-STAY-jing)
    Pronunciation of dictionary term "restaging"
    A process used to find out the amount or spread of cancer in the body if it comes back or gets worse after treatment. Restaging may also be done to find out how the cancer responded to treatment. If restaging is done and a new stage is assigned, the new stage will be marked with an “r” in front of it to show that it’s different from the original stage. Usually, the original stage stays the same, even if the cancer comes back or gets worse. The same tests that were done to diagnose the cancer are usually done again. Restaging helps doctors plan the best treatment for cancer that has come back or gotten worse.
  resting: (RES-ting)
    Pronunciation of dictionary term "resting"
    In biology, refers to a cell that is not dividing.
  restless legs syndrome: (… SIN-drome)
    Pronunciation of dictionary term "restless legs syndrome"
    A condition in which a person has a strong urge to move his or her legs in order to stop uncomfortable sensations. These include burning, itching, creeping, tugging, crawling, or pain. These feelings usually happen when a person is lying or sitting down, and are worse at night. They can also occur in other parts of the body. Also called RLS.
  resveratrol: (rez-VEER-uh-trol)
    Pronunciation of dictionary term "resveratrol"
    A substance found in the skins of grapes and in certain other plants, fruits, and seeds. It is made by various plants to help defend against invading fungi, stress, injury, infection, and too much sunlight. It is being studied in the prevention of cancer and heart disease. It is a type of antioxidant and a type of polyphenol.
  RET gene: (… jeen)
    Pronunciation of dictionary term "RET gene"
    A gene that makes a protein that plays an important role in cell growth and differentiation and in the development of nerve cells in the body. Mutations (changes) in the RET gene may cause the protein made by this gene to become overactive, which may cause abnormal cells, including cancer cells, to grow. RET gene mutations have been found in certain genetic conditions, including MEN2 syndrome and Hirschsprung disease, and in some types of cancer, including non-small cell lung cancer and thyroid cancer. The RET gene is a type of proto-oncogene and a type of receptor tyrosine kinase gene.
    More Information
    - RET gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/ret/)
  Retacrit: (REH-tuh-krit)
    Pronunciation of dictionary term "Retacrit"
    A drug used to treat anemia caused by chronic kidney disease, some types of chemotherapy, and an antiviral drug for HIV infection called zidovudine. It is also used to lower the number of donor blood transfusions needed during and after certain types of surgery. Retacrit is a form of erythropoietin (a substance naturally made by the kidneys) that is made in the laboratory. It helps the bone marrow make more red blood cells. Retacrit is a type of antianemic and a type of erythropoiesis-stimulating agent. Also called epoetin alfa, Epogen, and Procrit.
    More Information
    - Epoetin Alfa (https://www.cancer.gov/about-cancer/treatment/drugs/epoetinalfa)
  retch: (RECH)
    Pronunciation of dictionary term "retch"
    The action of the stomach and esophagus to try to vomit (eject some or all of the contents of the stomach). Retching that does not cause vomiting is called dry heaves.
  rete testis: (REE-tee TES-tis)
    Pronunciation of dictionary term "rete testis"
    A network of small tubes in the testicle that helps move sperm cells (male reproductive cells) from the testicle to the epididymis. The epididymis is where the sperm mature and are stored.
  Retevmo: (reh-TEV-moh)
    Pronunciation of dictionary term "Retevmo"
    A drug used to treat certain types of non-small cell lung cancer in adults and certain types of thyroid cancer or other solid tumor in adults and children aged 2 years and older. It is used in patients whose cancer has an abnormal RET gene. It is also being studied in the treatment of other types of cancer. Retevmo blocks certain proteins, including those made by the RET fusion gene or the mutated RET gene. Blocking these proteins may help keep cancer cells from growing. Retevmo is a type of tyrosine kinase inhibitor. Also called selpercatinib.
    More Information
    - Selpercatinib (https://www.cancer.gov/about-cancer/treatment/drugs/selpercatinib)
  reticular dermis: (reh-TIH-kyoo-ler DER-mis)
    Pronunciation of dictionary term "reticular dermis"
    The thick bottom layer of the dermis (the inner layer of the skin). The reticular dermis has blood vessels and connective tissue that supports the skin. Hair follicles, oil and sweat glands, and other structures are also found in the reticular dermis.
  retifanlimab: (REH-tih-FAN-lih-mab)
    Pronunciation of dictionary term "retifanlimab"
    A drug used to treat adults with Merkel cell carcinoma (a type of skin cancer) that has come back or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Retifanlimab binds to a protein called PD-1, which is found on T cells (a type of immune cell). Retifanlimab may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Zynyz.
    More Information
    - Retifanlimab-dlwr (https://www.cancer.gov/about-cancer/treatment/drugs/retifanlimab-dlwr)
  retiform hemangioendothelioma: (REE-tih-form hee-MAN-jee-oh-EN-doh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "retiform hemangioendothelioma"
    A rare, slow-growing tumor that usually forms on or under the skin of the arms, legs, and trunk. The tumor has blood vessels that branch out like a tree. Retiform hemangioendotheliomas can spread to nearby tissue and often come back after treatment. They usually do not spread to other parts of the body. They occur in young adults and sometimes children. Retiform hemangioendotheliomas are a type of vascular tumor.
  Retin-A: (REH-tin …)
    Pronunciation of dictionary term "Retin-A"
    A topical preparation of tretinoin that is used to treat acne. Tretinoin is a form of vitamin A.
  Retin-A-Micro: (REH-tin … MY-kroh)
    Pronunciation of dictionary term "Retin-A-Micro"
    A topical preparation of tretinoin that is used to treat acne. Tretinoin is a form of vitamin A.
  retina: (REH-tih-nuh)
    Pronunciation of dictionary term "retina"
    The light-sensitive layers of nerve tissue at the back of the eye that receive images and sends them as electric signals through the optic nerve to the brain.
    More Information
    - Retinoblastoma (https://www.cancer.gov/types/retinoblastoma)
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  retinoblastoma: (REH-tih-noh-blas-TOH-muh)
    Pronunciation of dictionary term "retinoblastoma"
    Cancer that forms in the tissues of the retina (the light-sensitive layers of nerve tissue at the back of the eye). Retinoblastoma usually occurs in children younger than 5 years. It may be hereditary or nonhereditary (sporadic).
    More Information
    - Retinoblastoma (https://www.cancer.gov/types/retinoblastoma)
  retinoic acid: (REH-tih-NOH-ik A-sid)
    Pronunciation of dictionary term "retinoic acid"
    A nutrient that the body needs in small amounts to function and stay healthy. Retinoic acid is made in the body from vitamin A and helps cells to grow and develop, especially in the embryo. A form of retinoic acid made in the laboratory is put on the skin to treat conditions such as acne and is taken by mouth to treat acute promyelocytic leukemia (a fast-growing cancer in which there are too many immature blood-forming cells in the blood and bone marrow). Retinoic acid is being studied in the prevention and treatment of other types of cancer. Also called all-trans retinoic acid, ATRA, tretinoin, and vitamin A acid.
  retinoic acid receptor alpha gene: (REH-tih-NOH-ik A-sid reh-SEP-ter AL-fuh jeen)
    Pronunciation of dictionary term "retinoic acid receptor alpha gene"
    A gene that makes a protein that controls the activity of certain genes that help white blood cells mature. Mutations (changes) in the retinoic acid receptor alpha gene can occur when a piece of the chromosome containing the retinoic acid receptor alpha gene breaks off and joins with a gene called PML on another chromosome. These changes may cause too many immature white blood cells to build up in the blood and bone marrow. This can lead to an aggressive (fast-growing) type of acute myeloid leukemia called acute promyelocytic leukemia. The protein made by the retinoic acid receptor alpha gene is a type of transcription factor. Also called RARA gene.
  retinoid: (REH-tih-noyd)
    Pronunciation of dictionary term "retinoid"
    Vitamin A or a vitamin A-like compound.
  retinol: (REH-tih-nol)
    Pronunciation of dictionary term "retinol"
    A nutrient that the body needs in small amounts to function and stay healthy. Retinol helps in vision, bone growth, reproduction, growth of epithelium (cells that line the internal and external surfaces of the body), and fighting infections. It is fat-soluble (can dissolve in fats and oils). Retinol is found in liver, egg yolks, and whole milk dairy products from animals and in fish oils. It can also be made in the body from a substance found in some fruits and vegetables, such as cantaloupes, carrots, spinach, and sweet potatoes. Retinol is being studied in the prevention and treatment of some types of cancer. Also called vitamin A.
  retinyl palmitate: (REH-tih-nil PAL-mih-tayt)
    Pronunciation of dictionary term "retinyl palmitate"
    A drug that is being studied in the prevention of cancer. It belongs to the family of drugs called retinoids.
  retracted nipple: (reh-TRAK-ted NIH-pul)
    Pronunciation of dictionary term "retracted nipple"
    A nipple that turns inward into the breast or lies flat against the breast. A retracted nipple may be present at birth or may be caused by aging, breastfeeding, breast surgery, injury, infection, or certain breast conditions. It may also be a sign of breast cancer. Also called inverted nipple.
  retromolar trigone: (reh-troh-MOH-ler TRY-gone)
    Pronunciation of dictionary term "retromolar trigone"
    The small area behind the wisdom teeth.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  retroperitoneal: (REH-troh-PAYR-ih-toh-NEE-ul)
    Pronunciation of dictionary term "retroperitoneal"
    Having to do with the area outside or behind the peritoneum (the tissue that lines the abdominal wall and covers most of the organs in the abdomen).
  retroperitoneum: (REH-troh-PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "retroperitoneum"
    The area in the back of the abdomen behind the peritoneum (the tissue that lines the abdominal wall and covers most of the organs in the abdomen). The organs in the retroperitoneum include the adrenal glands, aorta, kidneys, esophagus, ureters, pancreas, rectum, and parts of the stomach and colon.
  retropubic prostatectomy: (reh-troh-PYOO-bik PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "retropubic prostatectomy"
    Surgery to remove part or all of the prostate and some of the tissue around it. Nearby lymph nodes may also be removed. A retropubic prostatectomy may be done through an incision (cut) made in the wall of the lower abdomen, or it may be done using a laparoscope. A laparoscope is a thin, tube-like instrument with a light and lens for viewing. Several small incisions (cuts) are made in the wall of the abdomen, and the laparoscope is inserted through one opening to guide the surgery. Surgical instruments are inserted through the other openings to do the surgery.
    Two types of radical prostatectomy. In a retropubic prostatectomy, the prostate is removed through an incision in the wall of the abdomen. In a perineal prostatectomy, the prostate is removed through an incision in the area between the scrotum and the anus.
    Two panel drawing showing two ways of doing a radical prostatectomy; in the first panel, dotted line shows where incision is made through the wall of the abdomen for a retropubic prostatectomy; in the second panel, dotted line shows where incision is made in area between the scrotum and the anus for a perineal prostatectomy.
  retrospective: (REH-troh-SPEK-tiv)
    Pronunciation of dictionary term "retrospective"
    Looking back at events that have already taken place.
  retrospective cohort study: (REH-troh-SPEK-tiv KOH-hort STUH-dee)
    Pronunciation of dictionary term "retrospective cohort study"
    A research study in which the medical records of groups of individuals who are alike in many ways but differ by a certain characteristic (for example, female nurses who smoke and those who do not smoke) are compared for a particular outcome (such as lung cancer). Also called historic cohort study.
  retrospective study: (REH-troh-SPEK-tiv STUH-dee)
    Pronunciation of dictionary term "retrospective study"
    A study that compares two groups of people: those with the disease or condition under study (cases) and a very similar group of people who do not have the disease or condition (controls). Researchers study the medical and lifestyle histories of the people in each group to learn what factors may be associated with the disease or condition. For example, one group may have been exposed to a particular substance that the other was not. Also called case-control study.
  retroviral vector: (REH-troh-VY-rul VEK-ter)
    Pronunciation of dictionary term "retroviral vector"
    RNA from a virus that is used to insert genetic material into cells.
  retrovirus: (REH-troh-VY-rus)
    Pronunciation of dictionary term "retrovirus"
    A type of virus that has RNA instead of DNA as its genetic material. It uses an enzyme called reverse transcriptase to become part of the host cells’ DNA. This allows many copies of the virus to be made in the host cells. The virus that causes AIDS, the human immunodeficiency virus (HIV), is a type of retrovirus.
  reverse transcription: (ree-VERS tran-SKRIP-shun)
    Pronunciation of dictionary term "reverse transcription"
    In biology, the process in cells by which an enzyme makes a copy of DNA from RNA. The enzyme that makes the DNA copy is called reverse transcriptase and is found in retroviruses, such as the human immunodeficiency virus (HIV). Reverse transcription can also be carried out in the laboratory.
  reverse transcription-polymerase chain reaction: (ree-VERS tran-SKRIP-shun-puh-LIH-meh-rays chayn ree-AK-shun)
    Pronunciation of dictionary term "reverse transcription-polymerase chain reaction"
    A laboratory method used to make many copies of a specific genetic sequence for analysis. It uses an enzyme called reverse transcriptase to change a specific piece of RNA into a matching piece of DNA. This piece of DNA is then amplified (made in large numbers) by another enzyme called DNA polymerase. The amplified DNA copies help tell whether a specific mRNA molecule is being made by a gene. Reverse transcription-polymerase chain reaction may be used to look for certain changes in a gene or chromosome or for activation of certain genes, which may help diagnose a disease, such as cancer. It may also be used to study the RNA of certain viruses, such as the human immunodeficiency virus (HIV) and the hepatitis C virus, to help diagnose and monitor an infection. Also called RT-PCR.
  reversible posterior leukoencephalopathy syndrome: (ree-VER-sih-bul pos-TEER-ee-er LOO-koh-en-SEH-fuh-LAH-puh-thee SIN-drome)
    Pronunciation of dictionary term "reversible posterior leukoencephalopathy syndrome"
    A rare condition marked by headaches, vision problems, mental changes, seizures, and swelling in the brain. The symptoms of reversible posterior leukoencephalopathy syndrome usually come on quickly and can be serious and life threatening. When treated, symptoms often go away within days or weeks. Reversible posterior leukoencephalopathy syndrome may occur in patients with certain conditions, such as high blood pressure, eclampsia, severe infection, kidney disease, and certain autoimmune diseases. It may also occur in patients treated with certain anticancer drugs and immunosuppressive drugs. Also called posterior reversible encephalopathy syndrome, PRES, and RPLS.
  ReVia: (reh-VEE-uh)
    Pronunciation of dictionary term "ReVia"
    A drug that blocks the action of opiates (drugs used to treat pain). It may be used in the treatment of intravenous opiate addiction or alcohol dependence. ReVia is also being studied in the treatment of breast cancer. It may block the effects of the hormone estrogen, which causes some breast cancer cells to grow, or block the blood flow to tumors. It is a type of opiate antagonist. Also called naltrexone hydrochloride and Vivitrol.
  Revlimid: (REV-lih-mid)
    Pronunciation of dictionary term "Revlimid"
    A drug that is similar to thalidomide and is used alone or with other drugs to treat adults with certain types of follicular lymphoma, marginal zone lymphoma, mantle cell lymphoma, multiple myeloma, or anemia caused by certain types of myelodysplastic syndromes. It is also being studied in the treatment of other conditions and types of cancer. Revlimid may help the immune system kill abnormal blood cells or cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. Revlimid is a type of antiangiogenesis agent and a type of immunomodulating agent. Also called CC-5013 and lenalidomide.
    More Information
    - Lenalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/lenalidomide)
  RevM10 gene: (… jeen)
    Pronunciation of dictionary term "RevM10 gene"
    An antiviral gene that is being studied in the treatment of cancer in patients who have HIV, the virus that causes AIDS.
  Revuforj: (REH-vyoo-forj)
    Pronunciation of dictionary term "Revuforj"
    A drug used to treat adults and children aged 1 year and older with acute leukemia that has a certain change in the KMT2A gene and has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Revuforj binds to a protein called menin and keeps it from binding to another protein called KMT2A. This stops or slows the growth of leukemia cells with changes in the KMT2A gene. Also called revumenib citrate.
    More Information
    - Revumenib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/revumenib-citrate)
  revumenib citrate: (reh-VOO-meh-nib SIH-trayt)
    Pronunciation of dictionary term "revumenib citrate"
    A drug used to treat adults and children aged 1 year and older with acute leukemia that has a certain change in the KMT2A gene and has come back or has not gotten better with other treatment. It is also being studied in the treatment of other types of cancer. Revumenib citrate binds to a protein called menin and keeps it from binding to another protein called KMT2A. This stops or slows the growth of leukemia cells with changes in the KMT2A gene. Also called Revuforj.
    More Information
    - Revumenib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/revumenib-citrate)
  Reye syndrome: (ray SIN-drome)
    Pronunciation of dictionary term "Reye syndrome"
    A rare disease that damages the brain and liver and causes death if not treated. It occurs most often in children younger than 15 years who have had a fever-causing virus, such as chickenpox or flu. Taking aspirin during a viral illness may increase the risk of Reye syndrome.
  Rezlidhia: (rez-LIH-dee-uh)
    Pronunciation of dictionary term "Rezlidhia"
    A drug used to treat adults with acute myeloid leukemia that has come back or has not gotten better with other treatment and has a mutation (change) in the IDH1 gene. It is also being studied in the treatment of other types of cancer. Rezlidhia blocks the protein made by the mutated IDH1 gene. Blocking this protein may help keep cancer cells from growing. Rezlidhia is a type of enzyme inhibitor. Also called olutasidenib.
    More Information
    - Olutasidenib (https://www.cancer.gov/about-cancer/treatment/drugs/olutasidenib)
  rF-TRICOM: A cancer vaccine made with a form of a chicken virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called recombinant fowlpox-TRICOM vaccine.
  RFS: In cancer, the length of time after primary treatment for a cancer ends that the patient survives without any signs or symptoms of that cancer. In a clinical trial, measuring the RFS is one way to see how well a new treatment works. Also called DFS, disease-free survival, and relapse-free survival.
  RFT5-dgA immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "RFT5-dgA immunotoxin"
    A monoclonal antibody linked to a toxic substance. It is being studied in the treatment of melanoma that has spread to distant parts of the body. RFT5-dgA immunotoxin is made in the laboratory. It can find and kill certain white blood cells that prevent the immune system from killing cancer cells. Also called IgG-RFT5-dgA.
  RG7204: A drug used to treat Erdheim-Chester disease (a very rare type of histiocytosis) and advanced melanoma that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. RG7204 blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called BRAF (V600E) kinase inhibitor RO5185426, PLX4032, vemurafenib, and Zelboraf.
    More Information
    - Vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib)
  rhabdoid tumor: (RAB-doyd TOO-mer)
    Pronunciation of dictionary term "rhabdoid tumor"
    A rare, fast-growing cancer that usually forms in the kidney or central nervous system (the brain and spinal cord) but can also form in soft tissues in other areas of the body. Rhabdoid tumors tend to spread quickly, are hard to treat, and have a poor prognosis. Most rhabdoid tumors are caused by mutations (changes) in the tumor suppressor gene SMARCB1, which makes a protein that helps control cell growth. Rhabdoid tumors usually occur in infants and young children.
    More Information
    - Rhabdoid tumor (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7572/rhabdoid-tumor)
  rhabdomyosarcoma: (RAB-doh-MY-oh-sar-KOH-muh)
    Pronunciation of dictionary term "rhabdomyosarcoma"
    Cancer that forms in the soft tissues in a type of muscle called striated muscle. Rhabdomyosarcoma can occur anywhere in the body.
    More Information
    - Soft Tissue Sarcoma (https://www.cancer.gov/types/soft-tissue-sarcoma)
  rheumatism: (ROO-muh-TIH-zum)
    Pronunciation of dictionary term "rheumatism"
    A group of disorders marked by inflammation or pain in the connective tissue structures of the body. These structures include bone, cartilage, and fat.
  rheumatoid arthritis: (ROO-muh-TOYD ar-THRY-tis)
    Pronunciation of dictionary term "rheumatoid arthritis"
    An autoimmune disease that causes pain, swelling, and stiffness in the joints, and may cause severe joint damage, loss of function, and disability. The disease may last from months to a lifetime, and symptoms may improve and worsen over time.
  Rheumatrex: (ROO-muh-trex)
    Pronunciation of dictionary term "Rheumatrex"
    A drug used to treat many types of cancer. It is also used to treat rheumatoid arthritis and severe psoriasis (a type of skin condition). Rheumatrex stops cells from using folic acid to make DNA and may kill cancer cells. It may also lower the body’s immune response. Rheumatrex is a type of antimetabolite and a type of antifolate. Also called amethopterin, methotrexate, MTX, and Trexall.
    More Information
    - Methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate)
  rhIL-11: A drug used to increase the number of blood cells, especially platelets, in some cancer patients receiving chemotherapy. rhIL-11 is a form of interleukin-11 (a cytokine normally made by support cells in the bone marrow) that is made in the laboratory. It is a type of biological response modifier. Also called Neumega, oprelvekin, and recombinant human interleukin-11.
  rhinoscope: (RY-noh-skope)
    Pronunciation of dictionary term "rhinoscope"
    A thin, tube-like instrument used to examine the inside of the nose. A rhinoscope has a light and a lens for viewing and may have a tool to remove tissue. Also called nasoscope.
  rhinoscopy: (ry-NOS-koh-pee)
    Pronunciation of dictionary term "rhinoscopy"
    Examination of the inside of the nose using a rhinoscope. A rhinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. Also called nasoscopy.
  rhizoxin: (ry-ZOK-sin)
    Pronunciation of dictionary term "rhizoxin"
    A substance that is being studied in the treatment of cancer. It comes from a fungus and is similar to vinca alkaloid drugs. It belongs to the family of drugs called antimitotic agents.
  rhubarb: (ROO-barb)
    Pronunciation of dictionary term "rhubarb"
    The root of this plant has been used in some cultures to treat certain medical problems. It may have anti-inflammatory and anticancer effects. The scientific name is Rheum palmatum or Rheum officinale. Also called Chinese rhubarb, da-huang, Indian rhubarb, and Turkish rhubarb.
  Riabni: (ree-AB-nee)
    Pronunciation of dictionary term "Riabni"
    A drug that contains the active ingredient rituximab and is used alone or with other drugs to treat adults with certain types of B-cell non-Hodgkin lymphoma or chronic lymphocytic leukemia that are CD20 positive. It is also being studied in the treatment of other conditions and types of cancer. Riabni binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Riabni is a type of monoclonal antibody.
    More Information
    - Rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab)
  ribavirin: (RY-buh-VY-rin)
    Pronunciation of dictionary term "ribavirin"
    A drug used to treat respiratory syncytial virus (RSV) infection in the lungs.
  ribociclib succinate: (RY-boh-SY-klib SUK-sih-nayt)
    Pronunciation of dictionary term "ribociclib succinate"
    A drug used with an aromatase inhibitor or fulvestrant (a type of hormone therapy) to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer. It is also being studied in the treatment of other types of cancer. Ribociclib succinate blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Also called Kisqali.
    More Information
    - Ribociclib Succinate (https://www.cancer.gov/about-cancer/treatment/drugs/ribociclib)
  ribociclib succinate and letrozole: (RY-boh-SY-klib SUK-sih-nayt … LEH-truh-zole)
    Pronunciation of dictionary term "ribociclib succinate and letrozole"
    A combination pack of two drugs used to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer. It is also being studied in the treatment of other types of cancer. Ribociclib succinate blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Letrozole lowers the amount of estrogen made by the body, which may stop the growth of cancer cells that need estrogen to grow. It is a type of aromatase inhibitor. Ribociclib succinate and letrozole may work better than either drug alone. Also called Kisqali Femara Co-Pack.
    More Information
    - Ribociclib Succinate and Letrozole (https://www.cancer.gov/about-cancer/treatment/drugs/ribociclib-succinate-and-letrozole)
  riboflavin: (RY-boh-FLAY-vin)
    Pronunciation of dictionary term "riboflavin"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Riboflavin helps make red blood cells, helps some enzymes work properly, and keeps skin, nails, and hair healthy. It is found in milk, eggs, malted barley, organ meats, yeast, and leafy vegetables. Riboflavin is water-soluble (can dissolve in water) and must be taken in every day. Not enough riboflavin can cause anemia (a low number of red blood cells), mouth sores, and skin problems. Amounts of riboflavin may be higher in the blood of patients with some types of cancer. Also called vitamin B2.
  ribonucleic acid: (RY-boh-noo-KLAY-ik A-sid)
    Pronunciation of dictionary term "ribonucleic acid"
    One of two types of nucleic acid made by cells. Ribonucleic acid contains information that has been copied from DNA (the other type of nucleic acid). Cells make several different forms of ribonucleic acid, and each form has a specific job in the cell. Many forms of ribonucleic acid have functions related to making proteins. Ribonucleic acid is also the genetic material of some viruses instead of DNA. Ribonucleic acid can be made in the laboratory and used in research studies. Also called RNA.
  ribonucleotide reductase inhibitor: (RY-boh-NOO-klee-oh-tide ree-DUK-tays in-HIH-bih-ter)
    Pronunciation of dictionary term "ribonucleotide reductase inhibitor"
    A family of anticancer drugs that interfere with the growth of tumor cells by blocking the formation of deoxyribonucleotides (building blocks of DNA).
  ribosome: (RY-buh-some)
    Pronunciation of dictionary term "ribosome"
    In biology, a structure found inside cells that is involved in making proteins. Ribosomes help link amino acids together to form proteins.
  Richter syndrome: (RIK-ter SIN-drome)
    Pronunciation of dictionary term "Richter syndrome"
    A rare condition in which chronic lymphocytic leukemia (CLL) changes into a fast-growing type of lymphoma. Symptoms of Richter syndrome include fever, loss of weight and muscle mass, and other health problems. Also called Richter transformation.
  Richter transformation: (RIK-ter TRANZ-for-MAY-shun)
    Pronunciation of dictionary term "Richter transformation"
    A rare condition in which chronic lymphocytic leukemia (CLL) changes into a fast-growing type of lymphoma. Symptoms of Richter transformation include fever, loss of weight and muscle mass, and other health problems. Also called Richter syndrome.
  rickets: (RIH-kets)
    Pronunciation of dictionary term "rickets"
    A condition in children in which bones become soft and deformed because they don’t have enough calcium and phosphorus. It is caused by not having enough vitamin D in the diet or by not getting enough sunlight. In adults, this condition is called osteomalacia. Also called infantile rickets, juvenile rickets, and rachitis.
  ridaforolimus: (rih-duh-foh-ROH-lih-mus)
    Pronunciation of dictionary term "ridaforolimus"
    A substance being studied in the treatment of soft tissue and bone cancers. It is also being studied in the treatment of other solid tumors and hematologic cancer. Ridaforolimus stops cells from dividing and may cause cancer cells to die. It is a type of mTOR inhibitor. Also called AP23573.
  rifabutin: (RIH-fuh-BYOO-tin)
    Pronunciation of dictionary term "rifabutin"
    A drug used to prevent the spread of a bacterium called in patients with advanced HIV (the virus that causes AIDS) infection. It blocks an enzyme that the bacteria need to grow. It is a type of antibiotic. Also called Mycobutin.
  rifampin: (rih-FAM-pin)
    Pronunciation of dictionary term "rifampin"
    A drug used in the treatment of infections caused by bacteria. It belongs to the family of drugs called antibiotics.
  Right to Try Act: A U.S. law that allows patients access to certain drugs that have not been approved by the U.S. Food and Drug Administration (FDA). The patient must be unable to receive the drug in a clinical trial and must have a life-threatening illness for which other treatments are not available. Drugs used under the Right to Try Act must have been tested in a phase 1 clinical trial (the first step of testing a new treatment in people) and must be undergoing study to be approved by the FDA. Companies who develop and make drugs determine whether to make their products available to patients who qualify for access under the Right to Try Act.
    More Information
    - Access to Experimental Cancer Drugs (https://www.cancer.gov/about-cancer/treatment/drugs/access-experimental)
  Rilutek: (RIL-yoo-tek)
    Pronunciation of dictionary term "Rilutek"
    A drug used to treat a nerve disease called amyotrophic lateral sclerosis (ALS). It is also being studied in the treatment of melanoma (a type of skin cancer). Rilutek blocks the release of a substance that melanoma cells need to grow. It is a type of glutamate release inhibitor. Also called riluzole.
  riluzole: (RIL-yoo-zole)
    Pronunciation of dictionary term "riluzole"
    A drug used to treat a nerve disease called amyotrophic lateral sclerosis (ALS). It is also being studied in the treatment of melanoma (a type of skin cancer). Riluzole blocks the release of a substance that melanoma cells need to grow. It is a type of glutamate release inhibitor. Also called Rilutek.
  ripretinib: (rih-PREH-tih-nib)
    Pronunciation of dictionary term "ripretinib"
    A drug used to treat adults with advanced gastrointestinal stromal tumor. It is used in patients whose cancer was already treated with at least three other kinase inhibitors, including imatinib mesylate. It is also being studied in the treatment of other types of cancer. Ripretinib blocks certain proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Qinlock.
    More Information
    - Ripretinib (https://www.cancer.gov/about-cancer/treatment/drugs/ripretinib)
  risedronate: (rih-SEH-droh-nayt)
    Pronunciation of dictionary term "risedronate"
    A substance that is being studied in the prevention and treatment of osteoporosis. It belongs to the family of drugs called bone resorption inhibitors.
  risk assessment: (… uh-SES-ment)
    Pronunciation of dictionary term "risk assessment"
    A process used to estimate the risk that a certain event will happen. In medicine, this may include a person’s risk of having a child with a certain condition or disease, such as cancer. It may also be used to estimate the risk of carrying a certain gene mutation (change), or of having an adverse event (unexpected medical problem) in response to certain types of drugs or other substances. A risk assessment may be done by collecting information about a person’s age, sex, personal and family medical history, ethnic background, lifestyle, and other factors and using statistics tools to calculate risk.
    More Information
    - Risk Factors for Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk)
  risk factor: (... FAK-ter)
    Pronunciation of dictionary term "risk factor"
    Something that increases the chance of developing a disease. Some examples of risk factors for cancer are age, a family history of certain cancers, use of tobacco products, being exposed to radiation or certain chemicals, infection with certain viruses or bacteria, and certain genetic changes.
    More Information
    - Risk Factors for Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk)
  risk group: (risk groop)
    Pronunciation of dictionary term "risk group"
    In medicine, risk groups are used to describe people who are alike in important ways. For example, patients with the same type of cancer may be divided into different risk groups that depend on certain aspects of their disease. These risk groups may be based on the patients’ chance of being cured (good versus poor) or the chance that their disease will come back (high versus low). Treatment may be based on which risk group a patient falls into. Risk groups can also be used to describe people who share traits and behaviors that affect their chance of developing a disease. For example, people who do not smoke are in a lower risk group for lung cancer than people who smoke.
  risk model: (… MAH-dul)
    Pronunciation of dictionary term "risk model"
    In medicine, a tool used to estimate a person’s risk of developing a certain condition or disease, such as cancer. Risk models may also be used to estimate a person’s risk of carrying a certain gene change or of having a child with a certain condition. Risk models use computer programs and statistics to estimate risk based on information about a person that may include their age, sex, personal and family medical history, ethnic background, lifestyle, and other factors. There are many types of risk models, and each model looks at different factors that increase risk in different groups of people.
  risk ratio: (… RAY-shee-oh)
    Pronunciation of dictionary term "risk ratio"
    A measure of the risk of a certain event happening in one group compared to the risk of the same event happening in another group. In cancer research, risk ratios are used in prospective (forward looking) studies, such as cohort studies and clinical trials. A risk ratio of one means there is no difference between two groups in terms of their risk of cancer, based on whether or not they were exposed to a certain substance or factor, or how they responded to two treatments being compared. A risk ratio of greater than one or of less than one usually means that being exposed to a certain substance or factor either increases (risk ratio greater than one) or decreases (risk ratio less than one) the risk of cancer, or that the treatments being compared do not have the same effects. Also called relative risk.
  risk-reducing mastectomy: (risk-ree-DOO-sing ma-STEK-toh-mee)
    Pronunciation of dictionary term "risk-reducing mastectomy"
    Surgery to reduce the risk of breast cancer by removing one or both breasts before disease develops. Risk-reducing mastectomy may be done in people who have a very high risk of developing breast cancer. Also called preventive mastectomy and prophylactic mastectomy.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  risk-reducing oophorectomy: (risk-ree-DOO-sing oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "risk-reducing oophorectomy"
    Surgery done to reduce the risk of ovarian cancer and breast cancer by removing the ovaries before disease develops. Removing the ovaries lowers the amount of estrogen in the body, which may slow the growth of some types of breast cancer. Risk-reducing oophorectomy is usually done in women who have a high risk of developing breast cancer and/or ovarian cancer caused by certain genetic mutations. Also called prophylactic oophorectomy.
    More Information
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
  Risperdal: (RIS-per-dal)
    Pronunciation of dictionary term "Risperdal"
    A drug used to treat certain mental disorders, such as schizophrenia and bipolar disease. It may also be used to treat certain behavior problems in children. Risperdal blocks the action of certain chemicals in the brain. It is a type of antipsychotic. Also called risperidone.
  risperidone: (ris-PAYR-ih-done)
    Pronunciation of dictionary term "risperidone"
    A drug used to treat certain mental disorders, such as schizophrenia and bipolar disease. It may also be used to treat certain behavior problems in children. Risperidone blocks the action of certain chemicals in the brain. It is a type of antipsychotic. Also called Risperdal.
  Ritalin: (RIH-tuh-lin)
    Pronunciation of dictionary term "Ritalin"
    A drug used to treat certain behavior disorders, such as attention deficit hyperactivity disorder (ADHD). It is also being studied as a way to improve brain function in patients treated with anticancer drugs. Ritalin acts on certain parts of the brain. It is a type of central nervous system stimulant. Also called Concerta and methylphenidate hydrochloride.
  ritonavir: (ry-TOH-nuh-veer)
    Pronunciation of dictionary term "ritonavir"
    A drug used to treat infection with HIV (the virus that causes AIDS). It is also being studied in the treatment of some types of cancer. Ritonavir blocks the ability of HIV to make copies of itself and may block the growth of cancer cells. It is a type of anti-HIV agent and a type of protease inhibitor. Also called Norvir.
  ritual: (RIH-chuh-wul)
    Pronunciation of dictionary term "ritual"
    An action or series of actions that is repeated, often in a religious or social setting. In medicine, it may describe a repeated action (such as hand washing) done to relieve feelings of fear, dread, and uneasiness in people who have an obsessive-compulsive disorder.
  Rituxan: (rih-TUK-sun)
    Pronunciation of dictionary term "Rituxan"
    A drug that contains the active ingredient rituximab and is used alone or with other drugs to treat adults and children aged 6 months and older with certain types of B-cell non-Hodgkin lymphoma, adults with chronic lymphocytic leukemia, and children aged 6 months and older with B-cell acute leukemia. It is used in patients whose cancer is CD20 positive. It is also being studied in the treatment of other conditions and types of cancer. Rituxan binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Rituxan is a type of monoclonal antibody.
    More Information
    - Rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab)
  Rituxan Hycela: (rih-TUK-sun hy-SEL-uh)
    Pronunciation of dictionary term "Rituxan Hycela"
    A combination of rituximab and hyaluronidase used to treat adults with certain types of follicular lymphoma, diffuse large B-cell lymphoma, or chronic lymphocytic leukemia. Rituximab binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Hyaluronidase allows rituximab to be given by injection under the skin. Rituxan Hycela can be given in less time than rituximab alone, which is given as an infusion. Also called rituximab and hyaluronidase.
    More Information
    - Rituximab and Hyaluronidase Human (https://www.cancer.gov/about-cancer/treatment/drugs/rituximabandhyaluronidasehuman)
  rituximab: (rih-TUK-sih-mab)
    Pronunciation of dictionary term "rituximab"
    A drug used alone or with other drugs under the brand names Riabni, Rituxan, Ruxience, and Truxima to treat certain types of B-cell non-Hodgkin lymphoma, chronic lymphocytic leukemia, and B-cell acute leukemia that are CD20 positive. Rituximab is also being studied in the treatment of other conditions and types of cancer. Rituximab binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Rituximab is a type of monoclonal antibody.
    More Information
    - Rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab)
  rituximab and hyaluronidase: (rih-TUK-sih-mab … HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "rituximab and hyaluronidase"
    A combination of two drugs used to treat adults with certain types of follicular lymphoma, diffuse large B-cell lymphoma, or chronic lymphocytic leukemia. Rituximab binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Hyaluronidase allows rituximab to be given by injection under the skin. Rituximab and hyaluronidase can be given in less time than rituximab alone, which is given as an infusion. Also called Rituxan Hycela.
    More Information
    - Rituximab and Hyaluronidase Human (https://www.cancer.gov/about-cancer/treatment/drugs/rituximabandhyaluronidasehuman)
  RK-0202: A substance that is being studied in the prevention of oral mucositis in patients receiving radiation therapy or chemotherapy for head and neck cancer.
  RLS: A condition in which a person has a strong urge to move his or her legs in order to stop uncomfortable sensations. These include burning, itching, creeping, tugging, crawling, or pain. These feelings usually happen when a person is lying or sitting down, and are worse at night. They can also occur in other parts of the body. Also called restless legs syndrome.
  RMP-7: A substance that is being studied for its ability to help other drugs reach the brain. It belongs to the family of drugs called bradykinin agonists. Also called lobradimil.
  RNA: One of two types of nucleic acid made by cells. RNA contains information that has been copied from DNA (the other type of nucleic acid). Cells make several different forms of RNA, and each form has a specific job in the cell. Many forms of RNA have functions related to making proteins. RNA is also the genetic material of some viruses instead of DNA. RNA can be made in the laboratory and used in research studies. Also called ribonucleic acid.
  RNA sequencing: (… SEE-kwen-sing)
    Pronunciation of dictionary term "RNA sequencing"
    A laboratory method used to learn the exact sequence (order) of the building blocks that make up all RNA molecules in a cell. In a cell, RNA is copied from pieces of DNA and contains information to make proteins and perform other important functions. RNA sequencing is used to learn more about which genes are expressed (turned on) in different types of cells and when and how these genes are expressed. This may help researchers understand the cause of certain diseases, such as cancer.
  Ro 31-7453: A substance that is being studied in the treatment of cancer. It may prevent cancer cells from dividing. It belongs to the family of drugs called cell cycle inhibitors.
  Ro 50-3821: A substance that is being studied in the treatment of anemia in patients who are receiving chemotherapy. It is a form of erythropoietin (a substance produced in the kidneys that stimulates the production of red blood cells) that has been changed in the laboratory. Also called methoxypolyethylene glycol epoetin beta.
  RO4929097: A substance being studied in the treatment of cancer. It blocks certain enzymes that are needed for cell growth. This may slow the growth of cancer cells. It may also decrease the growth of new blood vessels that tumors need to grow. It is a type of gamma-secretase inhibitor and a type of Notch signaling inhibitor.
  robot-assisted laparoscopic radical prostatectomy: (ROH-bot-uh-SIS-ted LA-puh-ruh-SKAH-pik RA-dih-kul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "robot-assisted laparoscopic radical prostatectomy"
    Surgery that uses a computer-assisted mechanical device (robot) to remove the entire prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). Nearby lymph nodes may also be removed. During robot-assisted laparoscopic radical prostatectomy, several small incisions (cuts) are made in the wall of the lower abdomen. The surgeon inserts an instrument with a camera through one of the openings and surgical instruments through the other openings using the robotic arms. The camera gives the surgeon a clear, 3-dimensional view of the prostate and surrounding structures. The surgeon then uses the robotic arms to remove the prostate. An attempt is made to protect the nerves that control penile erection and the bladder from damage. Also called robotic laparoscopic radical prostatectomy.
  robotic laparoscopic radical prostatectomy: (roh-BAH-tik LA-puh-ruh-SKAH-pik RA-dih-kul PROS-tuh-TEK-toh-mee)
    Pronunciation of dictionary term "robotic laparoscopic radical prostatectomy"
    Surgery that uses a computer-assisted mechanical device (robot) to remove the entire prostate and some of the tissue around it, including the seminal vesicles (a gland that helps make semen). Nearby lymph nodes may also be removed. During robotic laparoscopic radical prostatectomy, several small incisions (cuts) are made in the wall of the lower abdomen. The surgeon inserts an instrument with a camera through one of the openings and surgical instruments through the other openings using the robotic arms. The camera gives the surgeon a clear, 3-dimensional view of the prostate and surrounding structures. The surgeon then uses the robotic arms to remove the prostate. An attempt is made to protect the nerves that control penile erection and the bladder from damage. Also called robot-assisted laparoscopic radical prostatectomy.
  rofecoxib: (ROH-feh-KOK-sib)
    Pronunciation of dictionary term "rofecoxib"
    A drug that was being used for pain relief and was being studied for its ability to prevent cancer and to prevent the growth of new blood vessels that tumors need to grow. It is a type of nonsteroidal anti-inflammatory drug and a type of antiangiogenesis agent. Rofecoxib was taken off the market in the U.S. because of safety concerns. Also called Vioxx.
  rolapitant hydrochloride: (roh-LA-pih-tunt HY-droh-KLOR-ide)
    Pronunciation of dictionary term "rolapitant hydrochloride"
    A drug used with other drugs in adults to prevent nausea and vomiting caused by chemotherapy. Rolapitant hydrochloride blocks the action of a certain chemical in the central nervous system that may trigger nausea and vomiting. Blocking this chemical may lessen nausea and vomiting. Rolapitant hydrochloride is a type of antiemetic and a type of substance P/neurokinin 1 receptor antagonist. Also called Varubi.
    More Information
    - Rolapitant Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/rolapitanthydrochloride)
  Roman chamomile: (ROH-mun KA-muh-mile)
    Pronunciation of dictionary term "Roman chamomile"
    A type of chamomile plant with daisy-like white flowers that is found in Europe, North America, and Argentina. The dried flowers are used in teas to calm and relax, to improve sleep, and to help with stomach problems. Its essential oil (scented liquid taken from plants) is used in perfumes, shampoos, face creams, lotions, and aromatherapy. The scientific names are Chamaemelum nobile and Anthemis nobilis. Also called English chamomile.
  Rombo syndrome: (ROM-boh SIN-drome)
    Pronunciation of dictionary term "Rombo syndrome"
    A very rare, inherited disorder that causes a bluish-red skin color on the lips, hands, and feet. It also causes skin lesions that leave pitted scars, usually on the cheeks. Other signs and symptoms include little or no hair growth in the affected areas and thin or missing eyelashes and eyebrows; small, yellowish bumps that cause the skin to become rough; thinning of the skin; and other skin problems. The signs and symptoms usually appear between 7 and 10 years of age. People with Rombo syndrome have a very high risk of developing basal cell skin cancer, usually around the age of 35 years. The gene involved in Rombo syndrome is not known.
    More Information
    - Rombo syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4738/rombo-syndrome)
  romidepsin: (ROH-mih-DEP-sin)
    Pronunciation of dictionary term "romidepsin"
    A drug used to treat adults with cutaneous T-cell lymphoma that has already been treated with at least one other type of systemic therapy. It is also being studied in the treatment of other types of cancer. Romidepsin blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of depsipeptide and a type of histone deacetylase inhibitor. Also called FR901228 and Istodax.
    More Information
    - Romidepsin (https://www.cancer.gov/about-cancer/treatment/drugs/romidepsin)
  romiplostim: (ROH-mih-PLOH-stim)
    Pronunciation of dictionary term "romiplostim"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults and in certain children with immune thrombocytopenic purpura that did not get better with other treatment. It is also being studied in the treatment of other conditions and types of cancer. Romiplostim binds to the thrombopoietin receptor, which causes the bone marrow to make more platelets. It is a type of thrombopoietin receptor agonist. Also called AMG 531 and Nplate.
    More Information
    - Romiplostim (https://www.cancer.gov/about-cancer/treatment/drugs/romiplostim)
  Romvimza: (rom-VIM-zuh)
    Pronunciation of dictionary term "Romvimza"
    A drug used to treat adults with tenosynovial giant cell tumor, a rare, usually benign (not cancer) tumor that affects the joints. It is used when surgery may make the symptoms worse or cause severe problems. It is also being studied in the treatment of other conditions related to cancer. Romvimza blocks certain proteins, which may help keep tumor cells from growing and spreading. It is a type of tyrosine kinase inhibitor. Also called vimseltinib dihydrate.
  ropeginterferon alfa-2b: (roh-peg-IN-ter-FEER-on AL-fuh …)
    Pronunciation of dictionary term "ropeginterferon alfa-2b"
    A drug used to treat adults with polycythemia vera (a disease in which too many red blood cells are made in the bone marrow). It is also being studied in the treatment of other conditions and some types of cancer. Ropeginterferon alfa-2b is a form of recombinant interferon alfa-2b that is made in the laboratory and linked to a substance called PEG, which makes the drug stay in the body longer. Ropeginterferon alfa-2b may lower the number of red blood cells made in the bone marrow. It is a type of cytokine and a type of immunomodulating agent. Also called Besremi.
    More Information
    - Ropeginterferon Alfa-2b-njft (https://www.cancer.gov/about-cancer/treatment/drugs/ropeginterferon-alfa-2b-njft)
  ropivacaine: (roh-PIH-vuh-kayn)
    Pronunciation of dictionary term "ropivacaine"
    A drug used to control pain and to cause a temporary loss of feeling in one part of the body, during and after surgery. It is also being studied for pain control after cancer surgery. It is a type of local anesthetic. Also called Naropin and ropivacaine hydrochloride.
  ropivacaine hydrochloride: (roh-PIH-vuh-kayn HY-droh-KLOR-ide)
    Pronunciation of dictionary term "ropivacaine hydrochloride"
    A drug used to control pain and to cause a temporary loss of feeling in one part of the body, during and after surgery. It is also being studied for pain control after cancer surgery. It is a type of local anesthetic. Also called Naropin.
  ROS1 gene: (… jeen)
    Pronunciation of dictionary term "ROS1 gene"
    A gene that makes a protein that is involved in sending signals in cells and in cell growth. Mutated (changed) forms of the ROS1 gene and protein have been found in some types of cancer, including non-small cell lung cancer (NSCLC), a type of brain cancer called glioblastoma multiforme, and cancers of the bile duct, ovary, stomach, colon, and rectum. The protein made by the ROS1 gene is a type of receptor tyrosine kinase.
  ROS1 inhibitor: (… in-HIH-bih-ter)
    Pronunciation of dictionary term "ROS1 inhibitor"
    A substance that blocks the activity of an abnormal protein called ROS1 fusion protein, which is found on some types of cancer cells. Blocking the ROS1 fusion protein may help keep cancer cells that have it from growing and spreading. Some ROS1 inhibitors are used to treat cancer. They are a type of targeted therapy.
  ROS1 positive: (… PAH-zih-tiv)
    Pronunciation of dictionary term "ROS1 positive"
    Describes cells that have a protein called ROS1 on their surface. In cancer, it is also used to describe cells that have a change in the structure of the ROS1 gene or a ROS1 fusion protein on their surface. In normal cells, ROS1 is involved in cell signaling and cell growth. Cancer cells that have the changed ROS1 gene or the ROS1 fusion protein may grow more quickly. Knowing whether a cancer is ROS1 positive may help plan treatment. Cancers that may be ROS1 positive include non-small cell lung cancer, a type of brain cancer called glioblastoma multiforme, and cancers of the bile duct, ovary, stomach, colon, and rectum.
  rosiglitazone: (roh-sig-LIH-tuh-zone)
    Pronunciation of dictionary term "rosiglitazone"
    The active ingredient in a drug that helps control the amount of glucose (sugar) in the blood and is being studied in the prevention and treatment of some types of cancer. Rosiglitazone stops cells from growing and may prevent the growth of new blood vessels that tumors need to grow. It is a type of thiazolidinedione and a type of antiangiogenesis agent.
  rosiglitazone maleate: (roh-sig-LIH-tuh-zone MAY-lee-AYT)
    Pronunciation of dictionary term "rosiglitazone maleate"
    A drug that helps control the amount of glucose (sugar) in the blood and is being studied in the prevention and treatment of some types of cancer. Rosiglitazone maleate stops cells from growing and may prevent the growth of new blood vessels that tumors need to grow. It is a type of thiazolidinedione and a type of antiangiogenesis agent. Also called Avandia.
  rosuvastatin calcium: (roh-SOO-vuh-STA-tin KAL-see-um)
    Pronunciation of dictionary term "rosuvastatin calcium"
    A drug used to lower the amount of cholesterol and other harmful substances, such as triglycerides, in the blood. It is also being studied in the prevention and treatment of some types of cancer and other conditions. Rosuvastatin calcium blocks an enzyme that helps make cholesterol in the body and it helps break down cholesterol. It also may cause cancer cells to die and may inhibit the growth of blood vessels that cancer cells need to grow. It is a type of HMG-CoA reductase inhibitor and a type of statin. Also called Crestor.
  Roswell Park regimen: (ROZ-wel … REH-jih-men)
    Pronunciation of dictionary term "Roswell Park regimen"
    A chemotherapy combination used to treat colorectal cancer. It is also used with radiation therapy to treat esophageal cancer and stomach cancer. It includes the drugs fluorouracil and leucovorin calcium.
  rotationplasty: (roh-TAY-shun-PLAS-tee)
    Pronunciation of dictionary term "rotationplasty"
    Surgery used to remove a tumor in or near the knee joint, often in young people who are still growing. The knee and part of the thigh are removed. The part of the leg that remains below the knee is then attached to the part of the leg above the knee, with the foot facing backward and the ankle joint acting as a new knee. The patient is then fitted with an artificial lower leg and foot.
  Rothmund-Thomson syndrome: (ROT-moond-TOM-sun SIN-drome)
    Pronunciation of dictionary term "Rothmund-Thomson syndrome"
    A rare, inherited disorder that affects many parts of the body, especially the skin, eyes, bones, hair, and teeth. The main sign or symptom is a red blistering rash on the face that begins in early infancy. Over time, the rash can spread to the arms, legs, and buttocks and cause patchy skin coloring, areas of thin skin, and small clusters of blood vessels under the skin. Other signs and symptoms include slow growth and shorter-than-average height; little or no hair, including eyelashes and eyebrows; abnormalities of the nails, teeth, and bones; gastrointestinal problems; and blood problems. People with Rothmund-Thomson syndrome have an increased risk of developing cancer at an early age, especially osteosarcoma (a type of bone cancer), basal cell skin cancer, and squamous cell skin cancer. Rothmund-Thomson syndrome may be caused by a mutation (change) in the RECQL4 gene. Also called poikiloderma congenitale and RTS.
    More Information
    - Rothmund-Thomson syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4392/rothmund-thomson-syndrome)
    - Rothmund-Thomson syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/rothmund-thomson-syndrome/)
  Rozlytrek: (roz-LY-trek)
    Pronunciation of dictionary term "Rozlytrek"
    A drug used in adults to treat non-small cell lung cancer that has spread and is ROS1 positive and in adults and children aged 1 month and older to treat certain types of solid tumors that have an NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Rozlytrek blocks certain proteins involved in cell signaling and cell growth. Blocking these proteins may help keep cancer cells from growing and may kill them. Rozlytrek is a type of tyrosine kinase inhibitor. Also called entrectinib.
    More Information
    - Entrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/entrectinib)
  RPI.4610: A substance being studied in the treatment of cancer. RPI.4610 is a special type of RNA made in the laboratory. It stops a protein called vascular endothelial growth factor receptor (VEGFR) from being made. This may prevent the growth of new blood vessels that tumors need to grow. It is a type of angiogenesis inhibitor and a type of ribozyme. Also called Angiozyme.
  RPLS: A rare condition marked by headaches, vision problems, mental changes, seizures, and swelling in the brain. The symptoms of RPLS usually come on quickly and can be serious and life threatening. When treated, symptoms often go away within days or weeks. RPLS may occur in patients with certain conditions, such as high blood pressure, eclampsia, severe infection, kidney disease, and certain autoimmune diseases. It may also occur in patients treated with certain anticancer drugs and immunosuppressive drugs. Also called posterior reversible encephalopathy syndrome, PRES, and reversible posterior leukoencephalopathy syndrome.
  RPR 109881A: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called taxanes.
  RRP: A rare condition in which wart-like growths called papillomas grow in the respiratory tract (air passages leading from the nose and mouth into the lungs). The papillomas most often grow in the larynx (voice box) and vocal cords. They can grow quickly, and they often grow back after they have been removed by surgery. Signs and symptoms of RRP include hoarseness, chronic cough, swallowing problems, and breathing problems, which may sometimes be life-threatening. RRP is caused by infection with certain types of human papillomavirus (HPV). It can occur in both children and adults. Also called recurrent respiratory papillomatosis.
  RSR13: A substance being studied in the treatment of brain tumors and some other types of cancer. It increases the amount of oxygen in tumor tissues, which may make the tumor cells easier to kill with radiation therapy. RSR13 is a type of radiosensitizing agent. Also called efaproxiral.
  RSV: A virus that causes respiratory infections with cold-like symptoms. Also called respiratory syncytial virus.
  RT-PCR: A laboratory method used to make many copies of a specific genetic sequence for analysis. It uses an enzyme called reverse transcriptase to change a specific piece of RNA into a matching piece of DNA. This piece of DNA is then amplified (made in large numbers) by another enzyme called DNA polymerase. The amplified DNA copies help tell whether a specific mRNA molecule is being made by a gene. RT-PCR may be used to look for certain changes in a gene or chromosome or for activation of certain genes, which may help diagnose a disease, such as cancer. It may also be used to study the RNA of certain viruses, such as the human immunodeficiency virus (HIV) and the hepatitis C virus, to help diagnose and monitor an infection. Also called reverse transcription-polymerase chain reaction.
  RTA 744: A substance being studied in the treatment of adult brain tumors. RTA 744 crosses the blood-brain barrier and blocks an enzyme needed for cancer growth. It is a type of topoisomerase inhibitor. Also called topoisomerase II inhibitor RTA 744.
  RTEL1 gene: (... jeen)
    Pronunciation of dictionary term "RTEL1 gene"
    A gene that makes a protein involved in maintaining telomeres (the ends of chromosomes) and in repairing DNA. Mutations (changes) in the RTEL1 gene have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
  RTK: A member of a group of proteins called tyrosine kinases that are found on the surface of cells. RTKs play an important role in many cell functions, including cell-to-cell communication and cell division, maturation, movement, metabolism, and survival. Sometimes, the genes that make RTKs have mutations (changes) that cause RTKs to be overactive or be found in higher-than-normal amounts. This may cause cancer cells to grow. Drugs that block the mutant RTKs are being used to treat some types of cancer. Also called receptor tyrosine kinase.
  RTS: A rare, inherited disorder that affects many parts of the body, especially the skin, eyes, bones, hair, and teeth. The main sign or symptom is a red blistering rash on the face that begins in early infancy. Over time, the rash can spread to the arms, legs, and buttocks and cause patchy skin coloring, areas of thin skin, and small clusters of blood vessels under the skin. Other signs and symptoms include slow growth and shorter-than-average height; little or no hair, including eyelashes and eyebrows; abnormalities of the nails, teeth, and bones; gastrointestinal problems; and blood problems. People with RTS have an increased risk of developing cancer at an early age, especially osteosarcoma (a type of bone cancer), basal cell skin cancer, and squamous cell skin cancer. RTS may be caused by a mutation (change) in the RECQL4 gene. Also called poikiloderma congenitale and Rothmund-Thomson syndrome.
    More Information
    - Rothmund-Thomson syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4392/rothmund-thomson-syndrome)
    - Rothmund-Thomson syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/rothmund-thomson-syndrome/)
  RU 486: A drug used to end early pregnancies. It is also being studied in the treatment of some types of cancer and other conditions. RU 486 blocks the action of progesterone, a hormone that helps some cancers grow. It is a type of antiprogesterone. Also called Mifeprex and mifepristone.
  Rubinstein-Taybi syndrome: (ROO-bin-stine-TAY-bee SIN-drome)
    Pronunciation of dictionary term "Rubinstein-Taybi syndrome"
    A rare, genetic disorder marked by being short, having wide big toes and thumbs, certain facial features, and problems in developing and learning. Other problems may include heart and kidney defects, eye and dental problems, and obesity. People with Rubinstein syndrome have an increased risk of some types of leukemia and brain tumors.
    More Information
    - Rubinstein-Taybi syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7593/rubinstein-taybi-syndrome)
    - Rubinstein-Taybi syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/rubinstein-taybi-syndrome/)
  Rubraca: (roo-BRAH-kuh)
    Pronunciation of dictionary term "Rubraca"
    A drug used to treat adults with certain types of prostate cancer or ovarian epithelial, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Rubraca blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Rubraca is a type of PARP inhibitor. Also called AG014699, PARP-1 inhibitor AG014699, and rucaparib camsylate.
    More Information
    - Rucaparib Camsylate (https://www.cancer.gov/about-cancer/treatment/drugs/rucaparibcamsylate)
  rucaparib camsylate: (roo-KA-puh-rib KAM-suh-layt)
    Pronunciation of dictionary term "rucaparib camsylate"
    A drug used to treat adults with certain types of prostate cancer or ovarian epithelial, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Rucaparib camsylate blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Rucaparib camsylate is a type of PARP inhibitor. Also called AG014699, PARP-1 inhibitor AG014699, and Rubraca.
    More Information
    - Rucaparib Camsylate (https://www.cancer.gov/about-cancer/treatment/drugs/rucaparibcamsylate)
  Ruxience: (RUK-see-ents)
    Pronunciation of dictionary term "Ruxience"
    A drug that contains the active ingredient rituximab and is used alone or with other drugs to treat adults with certain types of B-cell non-Hodgkin lymphoma or chronic lymphocytic leukemia that are CD20 positive. It is also being studied in the treatment of other conditions and types of cancer. Ruxience binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Ruxience is a type of monoclonal antibody.
    More Information
    - Rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab)
  ruxolitinib phosphate: (RUK-soh-LIH-tih-nib FOS-fayt)
    Pronunciation of dictionary term "ruxolitinib phosphate"
    A drug used to treat adults with certain types of primary myelofibrosis (MF), post-polycythemia vera MF, post-essential thrombocythemia MF, or polycythemia vera, and adults and children aged 12 years and older with acute or chronic graft-versus-host disease. It is also being studied in the treatment of some types of cancer. Ruxolitinib phosphate blocks a protein called JAK, which may help keep abnormal blood cells or cancer cells from growing. It may also lower the body’s immune response. Ruxolitinib phosphate is a type of tyrosine kinase inhibitor. Also called Jakafi.
    More Information
    - Ruxolitinib Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/ruxolitinibphosphate)
  rV-TRICOM: A cancer vaccine made with a form of a vaccinia virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called recombinant vaccinia-TRICOM vaccine and vaccinia-TRICOM vaccine.
  Rybrevant: (RY-breh-vant)
    Pronunciation of dictionary term "Rybrevant"
    A drug used alone or with other drugs to treat adults with non-small cell lung cancer that has spread and has an abnormal EGFR gene. It is used in patients whose cancer has not been treated with other anticancer therapy or has gotten worse during or after treatment with an EGFR tyrosine kinase inhibitor (a type of anticancer drug) or platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Rybrevant binds to receptors for proteins called EGF and MET, which are found on some types of cancer cells. Blocking these proteins may help keep cancer cells from growing. Rybrevant is a type of bispecific antibody. Also called amivantamab.
    More Information
    - Amivantamab-vmjw (https://www.cancer.gov/about-cancer/treatment/drugs/amivantamab-vmjw)
  Rydapt: (RY-dapt)
    Pronunciation of dictionary term "Rydapt"
    A drug used alone or with other anticancer drugs to treat adults with certain types of acute myeloid leukemia, mast cell leukemia, or systemic mastocytosis. It is also being studied in the treatment of other types of cancer. Rydapt blocks certain proteins, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Rydapt is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called midostaurin, N-benzoyl-staurosporine, and PKC412.
    More Information
    - Midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin)
  Rylaze: (RY-layz)
    Pronunciation of dictionary term "Rylaze"
    A drug that is a recombinant form of asparaginase Erwinia chrysanthemi and is used with other drugs to treat adults and children aged 1 month or older with acute lymphoblastic leukemia or lymphoblastic lymphoma. It is used in people who cannot take the enzyme asparaginase that comes from the bacterium E. coli. Rylaze breaks down the amino acid asparagine and may stop the growth of cancer cells that need asparagine to grow. It may also kill cancer cells. Rylaze is a type of protein synthesis inhibitor.
    More Information
    - Asparaginase Erwinia Chrysanthemi (Recombinant)-rywn (https://www.cancer.gov/about-cancer/treatment/drugs/asparaginase-erwinia-chrysanthemi-recombinant)
  Rytelo: (ry-TEL-oh)
    Pronunciation of dictionary term "Rytelo"
    A drug used to treat low-risk or intermediate-1 risk myelodysplastic syndromes in adults with anemia. It is used in patients who need regular red blood cell transfusions and did not respond to or cannot be treated with an erythropoiesis-stimulating agent. It is also being studied in the treatment of other types of cancer. Rytelo binds to an enzyme called telomerase, which is found at high levels in certain types of cells, including cancer cells. Blocking the activity of this enzyme may help keep cancer cells from growing and dividing and cause them to die. Rytelo is a type of enzyme inhibitor. Also called imetelstat sodium.
    More Information
    - Imetelstat Sodium (https://www.cancer.gov/about-cancer/treatment/drugs/imetelstat-sodium)
  S-1: A drug that is being studied for its ability to enhance the effectiveness of fluorouracil and prevent gastrointestinal side effects caused by fluorouracil. It belongs to the family of drugs called antimetabolites.
  S-phase fraction: (... fayz FRAK-shun)
    Pronunciation of dictionary term "S-phase fraction"
    A measure of the percentage of cells in a tumor that are in the phase of the cell cycle during which DNA is synthesized. The S-phase fraction may be used with the proliferative index to give a more complete understanding of how fast a tumor is growing.
  S100 calcium binding protein A8: (… KAL-see-um … PROH-teen …)
    Pronunciation of dictionary term "S100 calcium binding protein A8"
    A protein that is made by many different types of cells and is involved in processes that take place both inside and outside of the cell. It is made in larger amounts in inflammatory diseases such as rheumatoid arthritis, and in some types of cancer. It is being studied as a biomarker for breast cancer. Also called calgranulin A.
  S100 calcium binding protein A9: (… KAL-see-um … PROH-teen …)
    Pronunciation of dictionary term "S100 calcium binding protein A9"
    A protein that is made by many different types of cells and is involved in processes that take place both inside and outside of the cell. It is made in larger amounts in inflammatory diseases such as rheumatoid arthritis, and in some types of cancer. It is being studied as a biomarker for breast cancer. Also called calgranulin B.
  SAB: A temporary loss of feeling in the abdomen and/or the lower part of the body. Special drugs called anesthetics are injected into the fluid in the lower part of the spinal column to cause the loss of feeling. The patient stays awake during the procedure. It is a type of regional anesthesia. Also called spinal anesthesia, spinal block, and subarachnoid block.
  SABR: A type of external radiation therapy that uses special equipment to position a patient and precisely deliver radiation to tumors in the body (except the brain). The total dose of radiation is divided into smaller doses given over several days. This type of radiation therapy helps spare normal tissue. Also called SBRT, stereotactic ablative body radiation therapy, and stereotactic body radiation therapy.
  sacituzumab govitecan: (SAK-ih-TOO-zoo-mab GOH-vih-TEE-kan)
    Pronunciation of dictionary term "sacituzumab govitecan"
    A drug used to treat adults with certain types of breast cancer that have already been treated with other therapy. It is also being studied in the treatment of other types of cancer. Sacituzumab govitecan contains a monoclonal antibody called sacituzumab that binds to a protein called TROP2, which is found on some cancer cells. It also contains an anticancer drug called SN-38, which may help kill cancer cells. Sacituzumab govitecan is a type of antibody-drug conjugate. Also called Trodelvy.
    More Information
    - Sacituzumab Govitecan-hziy (https://www.cancer.gov/about-cancer/treatment/drugs/sacituzumabgovitecan-hziy)
  sacrum: (SAY-krum)
    Pronunciation of dictionary term "sacrum"
    The large, triangle-shaped bone in the lower spine that forms part of the pelvis. It is made of 5 fused bones of the spine.
  safingol: (SA-fin-gol)
    Pronunciation of dictionary term "safingol"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called protein kinase inhibitors. Also called L-threo-dihydrosphingosine.
  SAHA: A drug used to treat cutaneous T-cell lymphoma that came back, got worse, or did not get better during or after treatment with two systemic therapies. It is also being studied in the treatment of other types of cancer. SAHA blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase inhibitor. Also called suberoylanilide hydroxamic acid, vorinostat, and Zolinza.
    More Information
    - Vorinostat (https://www.cancer.gov/about-cancer/treatment/drugs/vorinostat)
  saline: (SAY-leen)
    Pronunciation of dictionary term "saline"
    A solution of salt and water.
  saliva: (suh-LY-vuh)
    Pronunciation of dictionary term "saliva"
    The clear, watery fluid in the mouth made by the salivary glands. Saliva moistens food to help with chewing and swallowing. It also contains enzymes that help digest food, minerals that strengthen teeth and prevent tooth decay, and antibodies that kill germs and help protect the mouth against infections.
  salivary gland: (SA-lih-VAYR-ee gland)
    Pronunciation of dictionary term "salivary gland"
    A gland in the mouth that produces saliva.
    More Information
    - Salivary Gland Cancer Treatment
    Anatomy of the salivary glands. The three main pairs of salivary glands are the parotid glands, the sublingual glands, and the submandibular glands.
    Anatomy of the salivary glands; drawing shows a cross section of the head and the three main pairs of salivary glands. The parotid glands are in front of and just below each ear; the sublingual glands are under the tongue in the floor of the mouth; the submandibular glands are below each side of the jawbone. The tongue and lymph nodes are also shown.
  salivary gland cancer: (SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "salivary gland cancer"
    A rare cancer that forms in tissues of a salivary gland (gland in the mouth that makes saliva). Most salivary gland cancers occur in older people.
    More Information
    - Salivary Gland Cancer Treatment
  salpingo-oophorectomy: (sal-PIN-goh-oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "salpingo-oophorectomy"
    Surgical removal of the fallopian tubes and ovaries.
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  salvage therapy: (SAL-vij THAYR-uh-pee)
    Pronunciation of dictionary term "salvage therapy"
    Treatment that is given after the cancer has not responded to other treatments.
  samarium Sm 153: (suh-MAYR-ee-um ...)
    Pronunciation of dictionary term "samarium Sm 153"
    A radioactive substance used to treat bone cancer and other cancers that have spread to the bone. Samarium Sm 153 is a radioactive form of the element samarium. It collects in bone, where it releases radiation that may kill cancer cells.
  samarium Sm 153-lexidronam pentasodium: (suh-MAYR-ee-um … LEK-sih-DROH-nam PEN-tuh-SOH-dee-um)
    Pronunciation of dictionary term "samarium Sm 153 lexidronam pentasodium"
    A drug used to treat bone pain caused by bone cancer and other cancers that have spread to the bone. It contains a radioactive substance called samarium Sm 153. Samarium Sm 153-lexidronam pentasodium collects in bone and gives off radiation that may kill cancer cells. Also called Quadramet.
  sample size: (SAM-pul ...)
    Pronunciation of dictionary term "sample size"
    The number of participants involved in the different treatment groups. A larger sample size provides stronger evidence, as it as associated with greater statistical power.
  Sancuso: (san-KOO-soh)
    Pronunciation of dictionary term "Sancuso"
    A drug used alone or with other drugs in adults to prevent nausea and vomiting caused by chemotherapy. Sancuso blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Sancuso is a type of antiemetic and a type of serotonin receptor antagonist. Also called granisetron and Sustol.
    More Information
    - Granisetron (https://www.cancer.gov/about-cancer/treatment/drugs/granisetron)
  saponin: (SA-poh-nin)
    Pronunciation of dictionary term "saponin"
    A substance found in soybeans and many other plants. Saponins may help lower cholesterol and may have anticancer effects.
  saquinavir mesylate: (sa-KWIH-nuh-veer MEH-zih-layt)
    Pronunciation of dictionary term "saquinavir mesylate"
    A drug that belongs to the family of drugs called protease inhibitors. It interferes with the ability of a virus to make copies of itself.
  Sarclisa: (sar-KLIH-suh)
    Pronunciation of dictionary term "Sarclisa"
    A drug used with other drugs to treat adults with certain types of multiple myeloma. It is also being studied in the treatment of other types of cancer. Sarclisa binds to a protein called CD38, which is found on some types of immune cells and cancer cells, including myeloma cells. Sarclisa may block CD38 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called isatuximab.
    More Information
    - Isatuximab-irfc (https://www.cancer.gov/about-cancer/treatment/drugs/isatuximab-irfc)
  sarCNU: A substance being studied in the treatment of cancer. It is a type of alkylating agent. Also called sarcosinamide nitrosourea.
  sarcoid: (SAR-koyd)
    Pronunciation of dictionary term "sarcoid"
    An inflammatory disease marked by the formation of granulomas (small nodules of immune cells) in the lungs, lymph nodes, and other organs. Sarcoid may be acute and go away by itself, or it may be chronic and progressive. Also called sarcoidosis.
  sarcoidosis: (SAR-koy-DOH-sis)
    Pronunciation of dictionary term "sarcoidosis"
    An inflammatory disease marked by the formation of granulomas (small nodules of immune cells) in the lungs, lymph nodes, and other organs. Sarcoidosis may be acute and go away by itself, or it may be chronic and progressive. Also called sarcoid.
  sarcoma: (sar-KOH-muh)
    Pronunciation of dictionary term "sarcoma"
    A type of cancer that begins in bone or in the soft tissues of the body, including cartilage, fat, muscle, blood vessels, fibrous tissue, or other connective or supportive tissue. Different types of sarcoma are based on where the cancer forms. For example, osteosarcoma forms in bone, liposarcoma forms in fat, and rhabdomyosarcoma forms in muscle. Treatment and prognosis depend on the type and grade of the cancer (how abnormal the cancer cells look under a microscope and how quickly the cancer is likely to grow and spread). Sarcoma occurs in both adults and children.
    More Information
    - Soft Tissue Sarcoma (https://www.cancer.gov/types/soft-tissue-sarcoma)
    - Bone Cancer (https://www.cancer.gov/types/bone)
  sarcomatoid carcinoma: (sar-KOH-muh-toyd KAR-sih-NOH-muh)
    Pronunciation of dictionary term "sarcomatoid carcinoma"
    A type of cancer that looks like a mixture of carcinoma (cancer that begins in the skin or in tissues that line or cover internal organs in the body) and sarcoma (cancer of the bone, cartilage, fat, muscle, blood vessels, or other connective or supportive tissue). The sarcoma-like cells are often spindle cells. Under a microscope, spindle cells look long and slender.
  sarcopenia: (SAR-koh-PEE-nee-uh)
    Pronunciation of dictionary term "sarcopenia"
    A condition characterized by loss of muscle mass, strength, and function in older adults. Signs and symptoms include weakness, fatigue, loss of energy, balance problems, and trouble walking and standing. Muscle loss or weakness can lead to falls, broken bones, and other serious injuries and can affect a person's ability to care for oneself. Older age, getting little or no exercise, and poor nutrition may increase the risk of sarcopenia. Sarcopenia may also occur in people with cancer.
    More Information
    - Nutrition in Cancer Care (Health Professional Version) (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss/nutrition-hp-pdq)
  sarcosinamide nitrosourea: (SAR-koh-SIH-nuh-MIDE ny-TROH-soh-YOO-ree-uh)
    Pronunciation of dictionary term "sarcosinamide nitrosourea"
    A substance being studied in the treatment of cancer. It is a type of alkylating agent. Also called sarCNU.
  sargramostim: (sar-GRA-moh-stim)
    Pronunciation of dictionary term "sargramostim"
    A substance that helps make more white blood cells, especially granulocytes, macrophages, and cells that become platelets. It is a cytokine that is a type of hematopoietic (blood-forming) agent. Also called GM-CSF and granulocyte-macrophage colony-stimulating factor.
  SARS-CoV-2: (SARZ-koh-VEE …)
    Pronunciation of dictionary term "SARS-CoV-2"
    The virus that causes a respiratory disease called coronavirus disease 19 (COVID-19). SARS-CoV-2 is a member of a large family of viruses called coronaviruses. These viruses can infect people and some animals. SARS-CoV-2 was first known to infect people in 2019. The virus is thought to spread from person to person through droplets released when an infected person coughs, sneezes, or talks. It may also be spread by touching a surface with the virus on it and then touching one’s mouth, nose, or eyes, but this is less common. Research is being done to treat COVID-19 and to prevent infection with SARS-CoV-2. Also called severe acute respiratory syndrome coronavirus 2.
    More Information
    - COVID-19: What People with Cancer Should Know (https://www.cancer.gov/contact/emergency-preparedness/coronavirus)
    - COVID-19 (Centers for Disease Control and Prevention) (https://www.cdc.gov/coronavirus/2019-ncov/index.html)
  satellite tumor: (SA-teh-lite TOO-mer)
    Pronunciation of dictionary term "satellite tumor"
    A group of tumor cells in an area near the primary (original) tumor. In melanoma, satellite tumors occur within 2 centimeters of the primary tumor, on or under the skin, and can be seen without a microscope. Satellite tumors may also be found in other types of cancer, including cancers of the breast, lung, liver, and brain. Having a satellite tumor is a sign that the cancer has spread from where it first formed.
  satraplatin: (SA-truh-PLA-tin)
    Pronunciation of dictionary term "satraplatin"
    A substance being studied in the treatment of prostate and other types of cancer. It contains the metal platinum and may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called BMS-182751 and JM 216.
  saturated fat: (SA-chuh-RAY-ted…)
    Pronunciation of dictionary term "saturated fat"
    A type of fat with certain chemical properties that is usually solid at room temperature. Most saturated fats come from animal food products, but some plant oils, such as palm and coconut oil, also contain high levels. Eating saturated fat increases the level of cholesterol in the blood and the risk of heart disease.
  saw palmetto: (...pawl-MEH-toh)
    Pronunciation of dictionary term "saw palmetto"
    A shrub that is a member of the palm tree family. An extract made from the berries of this shrub has been studied in the treatment of certain urinary and prostate disorders. The scientific name is Serenoa repens.
  SB-715992: A substance being studied in the treatment of cancer. SB-715992 blocks a protein that tumor cells need to divide. It is a type of mitotic inhibitor. Also called ispinesib.
  SB939: A substance being studied in the treatment of several types of cancer. SB939 blocks the action of an enzyme called histone deacetylase (HDAC) and may stop tumor cells from dividing. It is a type of HDAC inhibitor.
  SBRT: A type of external radiation therapy that uses special equipment to position a patient and precisely deliver radiation to tumors in the body (except the brain). The total dose of radiation is divided into smaller doses given over several days. This type of radiation therapy helps spare normal tissue. Also called SABR, stereotactic ablative body radiation therapy, and stereotactic body radiation therapy.
  SC-70935: A substance being studied for its ability to stimulate the production of blood cells during chemotherapy. It is a type of colony-stimulating factor. Also called leridistim.
  SC-PEG E. coli L-asparaginase: (… as-PAYR-uh-jih-NAYS)
    Pronunciation of dictionary term "SC-PEG E. coli L-asparaginase"
    A drug used with other drugs to treat acute lymphoblastic leukemia in children and young adults aged 1 month to 21 years. It is also being studied in the treatment of other types of cancer. SC-PEG E. coli L-asparaginase is made up of the enzyme L-asparaginase that is linked to a substance called SC-PEG, which makes the drug stay in the body longer. L-asparaginase comes from the bacterium E. coli and breaks down the amino acid asparagine. This may stop the growth of cancer cells that need asparagine to grow. SC-PEG E. coli L-asparaginase is a type of protein synthesis inhibitor. Also called Asparlas, calaspargase pegol, and EZN-2285.
    More Information
    - Calaspargase Pegol-mknl (https://www.cancer.gov/about-cancer/treatment/drugs/calaspargasepegol-mknl)
  scalpel: (SKAL-pul)
    Pronunciation of dictionary term "scalpel"
    A small, thin knife used for surgery.
  scan: (skan)
    Pronunciation of dictionary term "scan"
    A type of test that makes detailed pictures of areas inside the body. A scan may also refer to the picture that gets made during the test. Scans may be used to help diagnose disease, plan treatment, or find out how well treatment is working. There are many different types of scans, including computed tomography (CT) scans, magnetic resonance imaging (MRI) scans, and nuclear medicine scans (such as bone scans and liver scans). CT scans are done with an x-ray machine linked to a computer. MRI scans are done with radio waves and a powerful magnet linked to a computer. Nuclear medicine scans are done with small amounts of radioactive substances that are injected into the body and a special machine that detects the radioactive substance.
  scanner: (SKA-ner)
    Pronunciation of dictionary term "scanner"
    In medicine, an instrument that takes pictures of the inside of the body.
  scapula: (SKA-pyoo-luh)
    Pronunciation of dictionary term "scapula"
    One of a pair of triangular bones at the back of the shoulder. The scapula connects the collarbone with the upper arm bone. Also called shoulder blade.
  scar tissue: (skar TIH-shoo)
    Pronunciation of dictionary term "scar tissue"
    Fibrous tissue that forms when normal tissue is destroyed by disease, injury, or surgery. For example, scar tissue forms when a wound heals after a cut, sore, burn, or other skin condition, or when an incision (cut) is made into the skin during surgery. It may also form inside the body when certain conditions, such as cirrhosis, cause normal tissue to become fibrous tissue.
  scatter radiation: (SKA-ter RAY-dee-AY-shun)
    Pronunciation of dictionary term "scatter radiation"
    Radiation that spreads out in different directions from a radiation beam when the beam interacts with a substance, such as body tissue. For example, during x-ray mammography, very small amounts of radiation may be scattered to areas away from the breast, such as the head and neck, sternum, and thyroid gland. The energy of scatter radiation is usually much lower than that of the original radiation beam.
  scattered fibroglandular breast tissue: (SKA-terd FY-broh-GLAN-juh-ler brest TIH-shoo)
    Pronunciation of dictionary term "scattered fibroglandular breast tissue"
    A term used to describe breast tissue that is made up of mostly fatty tissue and also has some dense fibrous tissue and glandular tissue. On a mammogram, the dense areas of the breast make it harder to find tumors or other changes. Scattered fibroglandular breast tissue is one of four categories used to describe a level of breast density seen on a mammogram. About 40% of women have this type of breast tissue.
  Scemblix: (SEM-blix)
    Pronunciation of dictionary term "Scemblix"
    A drug used to treat adults with chronic phase chronic myelogenous leukemia that is Philadelphia chromosome positive. It is used in patients whose cancer has the T315I mutation, whose cancer is newly diagnosed, or whose cancer was treated with at least two other tyrosine kinase inhibitors. It is also being studied in the treatment of other types of cancer. Scemblix blocks the BCR::ABL1 fusion protein, which may help keep cancer cells from growing and may kill them. Scemblix is a type of tyrosine kinase inhibitor. Also called asciminib hydrochloride.
    More Information
    - Asciminib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/asciminib-hydrochloride)
  SCF: A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. SCF is a type of cytokine and a type of growth factor. Also called kit ligand and stem cell factor.
  SCH 54031: A drug used under the brand name Sylatron to prevent melanoma from coming back after it has been removed by surgery and under the brand name PEG-Intron to treat chronic hepatitis C. It is also being studied in the treatment of other types of cancer. SCH 54031 is a form of interferon alfa (a substance normally made by cells in the immune system) that is made in the laboratory and linked to a substance called PEG, which makes the drug stay in the body longer. It is a type of cytokine and a type of immunomodulating agent. Also called peginterferon alfa-2b.
    More Information
    - Peginterferon Alfa-2b
  SCH 66336: An anticancer drug that belongs to the family of drugs called enzyme inhibitors. Also called lonafarnib.
  SCH-58500: A substance that has been studied in the treatment of some types of cancer. SCH-58500 is a weakened adenovirus that carries the p53 gene into tumor cells, causing them to die. It is a type of gene therapy. Also called ACN53, rAd/p53, and recombinant adenovirus-p53.
  Schedule I controlled substance: (SKEH-jool … kun-TROLD SUB-stunts)
    Pronunciation of dictionary term "Schedule I controlled substance"
    A drug or other substance that has a high chance of being abused or causing addiction and has no FDA-approved medical use in the United States. Schedule I controlled substances are tightly regulated by the federal government. Examples of Schedule I drugs are heroin, LSD, and ecstasy. Although marijuana (Cannabis) is classified as a Schedule I controlled substance by the federal government, some states have passed laws that allow the medical and recreational use of marijuana. Also called Schedule I drug.
  Schedule I drug: (SKEH-jool …)
    Pronunciation of dictionary term "Schedule I drug"
    A drug or other substance that has a high chance of being abused or causing addiction and has no FDA-approved medical use in the United States. Schedule I drugs are tightly regulated by the federal government. Examples of Schedule I drugs are heroin, LSD, and ecstasy. Although marijuana (Cannabis) is classified as a Schedule I drug by the federal government, some states have passed laws that allow the medical and recreational use of marijuana. Also called Schedule I controlled substance.
  Schiller test: (SHIH-ler …)
    Pronunciation of dictionary term "Schiller test"
    A test in which iodine is applied to the cervix. The iodine colors healthy cells brown; abnormal cells remain unstained, usually appearing white or yellow.
  schistosome: (SHIS-tuh-some)
    Pronunciation of dictionary term "schistosome"
    A parasitic worm that can cause diseases of the liver, bladder, and gastrointestinal tract. One type of schistosome has been linked to bladder cancer. Schistosomes are found in Africa, the Middle East, East Asia, the Caribbean, and South America.
  schizophrenia: (SKIT-soh-FREE-nee-uh)
    Pronunciation of dictionary term "schizophrenia"
    A group of severe mental disorders in which a person has trouble telling the difference between real and unreal experiences, thinking logically, having normal emotional responses to others, and behaving normally in social situations. Symptoms include seeing, hearing, feeling things that are not there, having false ideas about what is taking place or who one is, nonsense speech, unusual behavior, lack of emotion, and social withdrawal.
  school liaison: (skool lee-AY-zan)
    Pronunciation of dictionary term "school liaison"
    A person who helps a child return to school after a serious illness, such as cancer, or a long hospital stay. A school liaison may also arrange for education services in the child’s home or at the hospital if the child is not able to return to school. School liaisons help parents, teachers, and other students understand special issues that the child may have in returning to the classroom as a result of the illness or its treatment. This may help in planning extra education services and support that the child may need.
  Schwann cell: (shwan sel)
    Pronunciation of dictionary term "Schwann cell"
    A type of glial cell of the peripheral nervous system that helps separate and insulate nerve cells.
  schwannoma: (shwah-NOH-muh)
    Pronunciation of dictionary term "schwannoma"
    A tumor of the peripheral nervous system that arises in the nerve sheath (protective covering). It is almost always benign, but rare malignant schwannomas have been reported.
  SCID: A rare, inherited disease that is marked by a lack of B lymphocytes (white blood cells that make antibodies and help fight infections) and a lack of T lymphocytes (white blood cells that attack virus-infected cells, foreign cells, and cancer cells). Patients with this disease have a high risk of developing viral, bacterial, and fungal infections. Also called severe combined immunodeficiency disease.
    More Information
    - Severe combined immunodeficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7628/severe-combined-immunodeficiency)
  scientific review committee: (SY-en-TIH-fik ree-VYOO kuh-MIH-tee)
    Pronunciation of dictionary term "scientific review committee"
    A group of doctors, scientists, and other experts that reviews the detailed plan of a clinical trial for scientific quality and correct study design. There is a scientific review committee at every health care facility that does clinical research. Most clinical trials are reviewed by the scientific review committee before they go to the facility’s Institutional Review Board (IRB) for approval. Also called scientific review panel.
  scientific review panel: (SY-en-TIH-fik ree-VYOO PA-nil)
    Pronunciation of dictionary term "scientific review panel"
    A group of doctors, scientists, and other experts that reviews the detailed plan of a clinical trial for scientific quality and correct study design. There is a scientific review panel at every health care facility that does clinical research. Most clinical trials are reviewed by the scientific review panel before they go to the facility’s Institutional Review Board (IRB) for approval. Also called scientific review committee.
  scientist: (SY-en-tist)
    Pronunciation of dictionary term "scientist"
    A person who has studied science, especially one who is active in a particular field of investigation.
  scintigraphy: (sin-TIH-gruh-fee)
    Pronunciation of dictionary term "scintigraphy"
    A procedure that produces pictures (scans) of structures inside the body, including areas where there are cancer cells. Scintigraphy is used to diagnose, stage, and monitor disease. A small amount of a radioactive chemical (radionuclide) is injected into a vein or swallowed. Different radionuclides travel through the blood to different organs. A machine with a special camera moves over the person lying on a table and detects the type of radiation given off by the radionuclides. A computer forms an image of the areas where the radionuclide builds up. These areas may contain cancer cells. Also called radionuclide scanning.
  scintimammography: (SIN-tih-ma-MAH-gruh-fee)
    Pronunciation of dictionary term "scintimammography"
    A type of breast imaging test that is used to detect cancer cells in the breasts of some women who have had abnormal mammograms, or who have dense breast tissue. It is not used for screening or in place of a mammogram. In this test, a woman receives an injection of a small amount of a radioactive substance called technetium 99, which is taken up by cancer cells, and a gamma camera is used to take pictures of the breasts. Also called Miraluma test and sestamibi breast imaging.
  sclera: (SKLAYR-uh)
    Pronunciation of dictionary term "sclera"
    The white layer of the eye that covers most of the outside of the eyeball.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  scleroderma: (SKLAYR-oh-DER-muh)
    Pronunciation of dictionary term "scleroderma"
    A chronic disorder marked by hardening and thickening of the skin. Scleroderma can be localized or it can affect the entire body (systemic).
  sclerosing adenosis: (skleh-ROH-sing A-deh-NOH-sis)
    Pronunciation of dictionary term "sclerosing adenosis"
    A benign (not cancerous) condition in which scar-like fibrous tissue is found in the breast lobules (the glands that make milk). In sclerosing adenosis, the lobules are larger than normal. This may result in a breast lump that may be large enough to feel. Sclerosing adenosis may also cause pain in the breast. A biopsy may be needed to tell the difference between sclerosing adenosis and breast cancer. Sclerosing adenosis may slightly increase the risk of breast cancer.
  sclerosing epithelioid fibrosarcoma: (skleh-ROH-sing eh-pih-THEE-lee-oyd FY-broh-sar-KOH-muh)
    Pronunciation of dictionary term "sclerosing epithelioid fibrosarcoma"
    A rare, type of cancer that forms in fibrous (connective) tissue. Sclerosing epithelioid fibrosarcoma is a slow growing tumor, but may recur (come back) and spread to other parts of the body many years after treatment. It usually occurs in middle-aged or older adults, and is rare in children and adolescents. Sclerosing epithelioid fibrosarcoma is a type of soft tissue sarcoma.
  Sclerosol Intrapleural Aerosol: (SKLAYR-oh-sol IN-truh-PLOOR-ul AYR-oh-sol)
    Pronunciation of dictionary term "Sclerosol Intrapleural Aerosol"
    A mist or powdered form of the mineral magnesium silicate that is used to prevent malignant pleural effusions from coming back. Malignant pleural effusion is a condition in which cancer causes an abnormal collection of fluid in the space between the lung and chest wall. When Sclerosol Intrapleural Aerosol is given through a tube inserted into the pleural space, it causes the space to close up so fluid cannot collect there. Sclerosol Intrapleural Aerosol is a type of sclerosing agent. Also called Sterile Talc Powder, Steritalc, and talc.
    More Information
    - Talc (https://www.cancer.gov/about-cancer/treatment/drugs/talc)
  sclerotherapy: (SKLAYR-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "sclerotherapy"
    A treatment used to destroy abnormal blood vessels. A liquid is injected into a blood vessel, causing it to scar and break down. The blood flows through nearby healthy veins and the destroyed blood vessel is absorbed into normal tissue. Sclerotherapy is used to treat certain types of vascular tumors. It is also used to treat varicose and spider veins, hemorrhoids, and other blood vessel problems.
  scoliosis: (SKOH-lee-OH-sis)
    Pronunciation of dictionary term "scoliosis"
    A condition marked by a side-to-side curve of the backbone. The curve is usually shaped like an S or a C. In most cases, the cause of scoliosis is not known. In some cases, scoliosis may be present at birth or it may be caused by muscle spasms, inflammation, tumors, or certain other disorders. It may also occur at some point in time after radiation therapy to the backbone.
  screening: (SKREE-ning)
    Pronunciation of dictionary term "screening"
    Checking for disease when there are no symptoms. Since screening may find diseases at an early stage, there may be a better chance of curing the disease. Examples of cancer screening tests are the mammogram (for breast cancer), colonoscopy (for colon cancer), and the Pap test and HPV tests (for cervical cancer). Screening can also include doing a genetic test to check for a person’s risk of developing an inherited disease.
    More Information
    - Cancer Screening (https://www.cancer.gov/about-cancer/screening)
    - PDQ® Cancer Information Summaries: Screening/Detection (Testing for Cancer) (https://www.cancer.gov/publications/pdq/information-summaries/screening)
  screening mammogram: (SKREE-ning MA-muh-gram)
    Pronunciation of dictionary term "screening mammogram"
    An x-ray image of the breast used to check for breast cancer in people who have no signs or symptoms of the disease. Screening mammograms often make it possible to detect tumors that cannot be felt. They can also find microcalcifications (tiny deposits of calcium) that sometimes indicate the presence of breast cancer.
    More Information
    - Breast Cancer (https://www.cancer.gov/types/breast)
  screening test: (SKREE-ning …)
    Pronunciation of dictionary term "screening test"
    A test that checks for a disease or condition before symptoms appear. Screening tests may help find diseases at an early stage, when they may be easier to treat or cure. Examples of cancer screening tests include mammography (for breast cancer), colonoscopy (for colorectal cancer), and Pap tests and HPV tests (for cervical cancer). Screening tests may also include genetic tests to look for changes in genes or chromosomes. These changes may be a sign that a person has or is at risk of developing a specific disease or condition.
    More Information
    - Screening Tests (https://www.cancer.gov/about-cancer/screening/screening-tests)
    - PDQ® Cancer Information Summaries: Screening/Detection (Testing for Cancer) (https://www.cancer.gov/publications/pdq/information-summaries/screening)
  scrotal edema: (SKROH-tul eh-DEE-muh)
    Pronunciation of dictionary term "scrotal edema"
    A buildup of fluid in the scrotum (sac around the testicles). This causes swelling on one or both sides of the scrotum. Scrotal edema may be a sign of congestive heart failure.
  scrotum: (SKROH-tum)
    Pronunciation of dictionary term "scrotum"
    In males, the external sac that contains the testicles.
  Scutellaria barbata: (skoo-tuh-LAYR-ee-uh bar-BAY-tuh)
    Pronunciation of dictionary term "Scutellaria barbata"
    An herb that belongs to a group of herbs named the Scutellaria species or scullcap. Both the root and the above-ground part have been used to make herbal medicines. The root has been used in traditional Chinese medicine to treat lung cancer and other medical problems.
  SDOH: The social, economic, and physical conditions in the places where people are born and where they live, learn, work, play, and get older that can affect their health, well-being, and quality of life. SDOH includes factors such as education level, income, employment, housing, transportation, and access to healthy food, clean air and water, and health care services. SDOH has an important effect on health outcomes, especially in certain groups of people. For example, people who cannot afford healthy food or who do not live in a safe area for exercise are more likely to have a poor diet, be physically inactive, and have obesity. This can increase their risk of developing certain diseases, such as cancer. Also called social determinants of health.
    More Information
    - Cancer Disparities (https://www.cancer.gov/about-cancer/understanding/disparities)
  SDR: A way of describing how family members are related to each other when there is one other family member in the blood line between them. Examples of an SDR are an aunt, uncle, grandparent, grandchild, niece, nephew, or half-sibling. Also called second-degree relative.
  SDS: A rare, inherited disorder in which the pancreas and bone marrow do not work the way they should. Symptoms include problems digesting food, a low number of neutrophils (a type of white blood cell), bone problems, and being short. Infants with the disorder get bacterial infections and are at an increased risk of aplastic anemia, myelodysplastic syndrome, and leukemia. Also called Shwachman syndrome and Shwachman-Diamond syndrome.
    More Information
    - Shwachman-Diamond syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4863/shwachman-diamond-syndrome)
    - Shwachman-Diamond syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/shwachman-diamond-syndrome/)
  SDX-102: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called antimetabolites. Also called alanosine.
  Se-methyl-seleno-L-cysteine: (… MEH-thul-seh-LEE-noh-L-SIS-teh-een)
    Pronunciation of dictionary term "Se-methyl-seleno-L-cysteine"
    A substance that contains the element selenium (a nutrient that protects cells against damage) and is found in certain plants such as garlic and broccoli. Se-methyl-seleno-L-cysteine can act as an antioxidant and may help prevent or slow the growth of cancer cells. It is a type of amino acid.
  sebaceoma: (seh-BAY-shee-OH-muh)
    Pronunciation of dictionary term "sebaceoma"
    A rare, benign (not cancer) tumor that forms in an oil gland in the skin. Most sebaceomas appear as yellow, orange, or skin-colored bumps that occur on the head or neck. They tend to grow slowly and are painless. Sebaceomas may be found in people with a rare, inherited condition called Muir-Torre syndrome (MTS). People with MTS have an increased risk of developing several types of cancer. Sebaceomas most often occur in older adults. Also called sebaceous epithelioma.
    Sebaceous epitheliomas (or sebaceomas) are benign lesions originating from oil glands in the skin. They may be seen in individuals with Muir-Torre syndrome, a hereditary syndrome associated with the development of several types of cancer. They are commonly found on the face or neck.
    Two-panel photograph showing the forehead of an individual with three small, flesh-colored bumps on the surface of the skin (left panel) and a close-up of a single bump on the skin with hair surrounding it (right panel).
  sebaceous epithelioma: (seh-BAY-shus EH-pih-THEE-lee-OH-muh)
    Pronunciation of dictionary term "sebaceous epithelioma"
    A rare, benign (not cancer) tumor that forms in an oil gland in the skin. Most sebaceous epitheliomas appear as yellow, orange, or skin-colored bumps that occur on the head or neck. They tend to grow slowly and are painless. Sebaceous epitheliomas may be found in people with a rare, inherited condition called Muir-Torre syndrome (MTS). People with MTS have an increased risk of developing several types of cancer. Sebaceous epitheliomas most often occur in older adults. Also called sebaceoma.
    Sebaceous epitheliomas (or sebaceomas) are benign lesions originating from oil glands in the skin. They may be seen in individuals with Muir-Torre syndrome, a hereditary syndrome associated with the development of several types of cancer. They are commonly found on the face or neck.
    Two-panel photograph showing the forehead of an individual with three small, flesh-colored bumps on the surface of the skin (left panel) and a close-up of a single bump on the skin with hair surrounding it (right panel).
  sebum: (SEE-bum)
    Pronunciation of dictionary term "sebum"
    An oily substance produced by certain glands in the skin.
  second opinion: (SEH-kund uh-PIN-yun)
    Pronunciation of dictionary term "second opinion"
    In medicine, the opinion of a doctor other than the patient’s current doctor. The second doctor reviews the patient’s medical records and gives an opinion about the patient’s health problem and how it should be treated. A second opinion may confirm or question the first doctor’s diagnosis and treatment plan, give more information about the patient’s disease or condition, and offer other treatment options.
    More Information
    - Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care)
  second primary cancer: (SEH-kund PRY-mayr-ee KAN-ser)
    Pronunciation of dictionary term "second primary cancer"
    A term used to describe a new primary cancer that occurs in a person who has had cancer in the past. Second primary cancers may occur months or years after the original (primary) cancer was diagnosed and treated. Certain types of cancer treatment, such as chemotherapy and radiation therapy, may increase the risk of a second primary cancer. Having certain inherited gene mutations (changes) and being exposed to certain cancer-causing substances, such as tobacco smoke, may also increase the risk of a second primary cancer.
  second-degree relative: (SEH-kund-deh-GREE REH-luh-tiv)
    Pronunciation of dictionary term "second-degree relative"
    A way of describing how family members are related to each other when there is one other family member in the blood line between them. Examples of a second-degree relative are an aunt, uncle, grandparent, grandchild, niece, nephew, or half-sibling. Also called SDR.
  second-line therapy: (SEH-kund ... THAYR-uh-pee)
    Pronunciation of dictionary term "second-line therapy"
    Treatment that is given when initial treatment (first-line therapy) doesn’t work, or stops working.
  second-look surgery: (SEH-kund ... SER-juh-ree)
    Pronunciation of dictionary term "second-look surgery"
    Surgery performed after primary treatment to determine whether tumor cells remain.
  secondary cancer: (SEH-kun-dayr-ee KAN-ser)
    Pronunciation of dictionary term "secondary cancer"
    A term used to describe cancer that has spread (metastasized) from the place where it first started to another part of the body. Secondary cancers are the same type of cancer as the original (primary) cancer. For example, cancer cells may spread from the breast (primary cancer) to form new tumors in the lung (secondary cancer). The cancer cells in the lung are just like the ones in the breast. Also called secondary tumor.
  secondary endpoint: (SEH-kun-dayr-ee END-poynt)
    Pronunciation of dictionary term "secondary endpoint"
    In clinical trials, an additional result beyond the primary endpoint measured at the end of the study.
  secondary ovarian failure: (SEH-kun-dayr-ee oh-VAYR-ee-un FAYL-yer)
    Pronunciation of dictionary term "secondary ovarian failure"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. In secondary ovarian failure, the ovaries are normal but there is a problem getting hormone signals to them from the brain. This is usually caused by diseases of the pituitary gland or hypothalamus. Secondary ovarian failure may also be caused by certain medicines, too much exercise, or certain eating disorders. Some women with secondary ovarian failure sometimes have menstrual periods and may be able to have children. Also called secondary ovarian insufficiency.
  secondary ovarian insufficiency: (SEH-kun-dayr-ee oh-VAYR-ee-un IN-suh-FIH-shen-see)
    Pronunciation of dictionary term "secondary ovarian insufficiency"
    A condition in which the ovaries stop working and menstrual periods stop before age 40. This can cause fertility problems and symptoms of menopause. In secondary ovarian insufficiency, the ovaries are normal but there is a problem getting hormone signals to them from the brain. This is usually caused by diseases of the pituitary gland or hypothalamus. Secondary ovarian insufficiency may also be caused by certain medicines, too much exercise, or certain eating disorders. Some women with secondary ovarian insufficiency sometimes have menstrual periods and may be able to have children. Also called secondary ovarian failure.
  secondary tumor: (SEH-kun-dayr-ee TOO-mer)
    Pronunciation of dictionary term "secondary tumor"
    A term used to describe cancer that has spread (metastasized) from the place where it first started to another part of the body. Secondary tumors are the same type of cancer as the original (primary) cancer. For example, cancer cells may spread from the breast (primary cancer) to form new tumors in the lung (secondary tumor). The cancer cells in the lung are just like the ones in the breast. Also called secondary cancer.
  secondhand smoke: (SEH-kund-hand ...)
    Pronunciation of dictionary term "secondhand smoke"
    Smoke that comes from the burning of a tobacco product and smoke that is exhaled by smokers. Inhaling secondhand smoke is called involuntary or passive smoking. Also called environmental tobacco smoke and ETS.
    More Information
    - Secondhand Smoke and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/second-hand-smoke-fact-sheet)
  secrete: (seh-KREET)
    Pronunciation of dictionary term "secrete"
    To form and release a substance. In the body, cells secrete substances, such as sweat that cools the body or hormones that act in other parts of the body.
  secretin: (seh-KREE-tin)
    Pronunciation of dictionary term "secretin"
    A hormone released into the blood by cells in the inner layer of the small intestine. It is released when partly digested food moves from the stomach into the small intestine. Secretin causes the pancreas, liver, and stomach to release other substances that help digest food. Secretin may also be made in the laboratory.
  secretin human: (seh-KREE-tin HYOO-mun)
    Pronunciation of dictionary term "secretin human"
    A drug used to help diagnose gastrinomas (tumors that cause too much gastric acid to be made) and other problems with the pancreas. It is also used to increase secretions from the pancreas and to help identify a duct called the ampulla of Vater. Secretin human is a form of secretin that is made in the laboratory. Secretin causes the pancreas, liver, and stomach to release substances that help digest food. Also called ChiRhoStim and synthetic human secretin.
  secretin stimulation test: (seh-KREE-tin STIM-yoo-LAY-shun …)
    Pronunciation of dictionary term "secretin stimulation test"
    A test used to measure the ability of the pancreas to respond to a hormone called secretin. Secretin causes the pancreas, liver, and stomach to release substances that help digest food. During a secretin stimulation test, a tube is inserted through the nose or throat into the stomach and small intestine. Secretin is given to the patient by injection into a vein. After a certain amount of time, samples of fluid are taken from the small intestine through the tube and sent to a lab to test for a response. A secretin stimulation test may be used to help diagnose problems that affect the pancreas, such as pancreatitis, cystic fibrosis, and a type of pancreatic tumor called a gastrinoma. Also called pancreatic function test.
  sedation: (seh-DAY-shun)
    Pronunciation of dictionary term "sedation"
    A state of calmness, relaxation, or sleepiness caused by certain drugs. Sedation may be used to help relieve anxiety during medical or surgical procedures or to help cope with very stressful events. Drugs that relieve pain may be used at the same time.
  sedative: (SEH-duh-tiv)
    Pronunciation of dictionary term "sedative"
    A drug or substance used to calm a person down, relieve anxiety, or help a person sleep.
  sedimentation rate: (SEH-dih-men-TAY-shun rayt)
    Pronunciation of dictionary term "sedimentation rate"
    The distance red blood cells travel in one hour in a sample of blood as they settle to the bottom of a test tube. The sedimentation rate is increased in inflammation, infection, cancer, rheumatic diseases, and diseases of the blood and bone marrow. Also called erythrocyte sedimentation rate and ESR.
  sedoxantrone trihydrochloride: (seh-DOK-san-trone try-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "sedoxantrone trihydrochloride"
    A substance being studied in the treatment of some types of cancer. Sedoxantrone trihydrochloride binds to DNA and stops cells, including cancer cells, from repairing damage to DNA and from making more DNA, RNA, and protein. It is a type of DNA intercalator. Also called CI-958.
  SEER Program: (… PROH-gram)
    Pronunciation of dictionary term "SEER Program"
    A program of the National Cancer Institute that uses information collected by cancer registries to report on the number of new cases of cancer diagnosed and the number of cancer deaths across different geographic areas in the United States. These cancer statistics are updated every year and provide information on cancer cases based on patient demographics (such as age, gender, race, and ethnic group), the primary tumor site, the form and structure of the tumor, the stage of cancer at diagnosis, the first course of treatment, and patient survival information. The SEER Program also works with other organizations involved in cancer surveillance activities and supports research studies on cancer prevention and control. Also called Surveillance, Epidemiology, and End Results Program.
    More Information
    - Surveillance, Epidemiology, and End Results Program (https://seer.cancer.gov/)
  SEGA: A benign (not cancer), slow-growing tumor that usually forms in the walls of fluid-filled spaces in the brain. The tumors are made up of large, star-shaped cells called astrocytes. SEGAs are common in patients with tuberous sclerosis (an inherited disorder in which benign tumors form in the brain and other parts of the body). Also called subependymal giant cell astrocytoma.
  segmental cystectomy: (seg-MEN-tul sis-TEK-toh-mee)
    Pronunciation of dictionary term "segmental cystectomy"
    Surgery to remove part of the bladder (the organ that holds urine). Also called partial cystectomy.
  segmental mastectomy: (seg-MEN-tul ma-STEK-toh-mee)
    Pronunciation of dictionary term "segmental mastectomy"
    Surgery to remove cancer or other abnormal tissue from the breast and some normal tissue around it, but not the breast itself. Some lymph nodes under the arm may be removed for biopsy. Part of the chest wall lining may also be removed if the cancer is near it. Also called breast-conserving surgery, breast-sparing surgery, lumpectomy, partial mastectomy, and quadrantectomy.
    More Information
    - Breast Cancer Treatment
    Lumpectomy. The tumor and some normal tissue around it are removed, but not the breast itself. Some lymph nodes under the arm may also be removed. If the cancer is near the chest wall, part of the chest wall lining may be removed as well.
    Lumpectomy; the drawing on the left shows removal of the tumor and some of the normal tissue around it. The drawing on the right shows removal of some of the lymph nodes under the arm and removal of the tumor and part of the chest wall lining near the tumor. Also shown is fatty tissue in the breast.
  segmental resection: (seg-MEN-tul ree-SEK-shun)
    Pronunciation of dictionary term "segmental resection"
    Surgery to remove part of an organ or gland. It may also be used to remove a tumor and normal tissue around it. In lung cancer surgery, segmental resection refers to removing a section of a lobe of the lung. Also called segmentectomy.
  segmentectomy: (seg-men-TEK-toh-mee)
    Pronunciation of dictionary term "segmentectomy"
    Surgery to remove part of an organ or gland. It may also be used to remove a tumor and normal tissue around it. In lung cancer surgery, segmentectomy refers to removing a section of a lobe of the lung. Also called segmental resection.
  seizure: (SEE-zher)
    Pronunciation of dictionary term "seizure"
    Sudden, uncontrolled body movements and changes in behavior that occur because of abnormal electrical activity in the brain. Symptoms include loss of awareness, changes in emotion, loss of muscle control, and shaking. Seizures may be caused by drugs, high fevers, head injuries, and certain diseases, such as epilepsy.
  selection bias: (seh-LEK-shun BY-us)
    Pronunciation of dictionary term "selection bias"
    An error in choosing the individuals or groups to take part in a study. Ideally, the subjects in a study should be very similar to one another and to the larger population from which they are drawn (for example, all individuals with the same disease or condition). If there are important differences, the results of the study may not be valid.
  selective estrogen receptor degrader: (seh-LEK-tiv ES-truh-jin reh-SEP-ter deh-GRAY-der)
    Pronunciation of dictionary term "selective estrogen receptor degrader"
    A drug that binds to and breaks down proteins called estrogen receptors (ERs), which are found inside the cells of female reproductive tissue, breast tissue, and other types of tissue, and some cancer cells. These drugs keep the hormone estrogen from binding to the ERs inside the cells and block the effects of estrogen in the body. Some breast cancer cells and other types of cancer cells have ERs and may need estrogen to grow. Treatment with selective estrogen receptor degraders may keep these cancer cells from growing. Examples of selective estrogen receptor degraders that have been approved to treat some types of breast cancer are fulvestrant and elacestrant. Also called SERD.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  selective estrogen receptor modulator: (seh-LEK-tiv ES-truh-jin reh-SEP-ter MAH-juh-lay-ter)
    Pronunciation of dictionary term "selective estrogen receptor modulator"
    A drug that acts like estrogen on some tissues but blocks the effect of estrogen on other tissues. Tamoxifen and raloxifene are selective estrogen receptor modulators. Also called SERM.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  selective serotonin reuptake inhibitor: (seh-LEK-tiv SAYR-uh-TOH-nin ree-UP-tayk in-HIH-bih-ter)
    Pronunciation of dictionary term "selective serotonin reuptake inhibitor"
    A type of drug that is used to treat depression and some other conditions. Selective serotonin reuptake inhibitors stop or delay the body from reabsorbing a substance called serotonin, which leaves more of it available for the body to use. Raising serotonin levels can help regulate mood, appetite, digestion, sleep, and many other bodily functions. Selective serotonin reuptake inhibitors include drugs such as citalopram, escitalopram, fluoxetine, paroxetine, and sertraline. Also called SSRI.
  selenium: (seh-LEE-nee-um)
    Pronunciation of dictionary term "selenium"
    A mineral that is needed by the body to stay healthy. It is being studied in the prevention and treatment of some types of cancer. Selenium is a type of antioxidant.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  self-esteem: (self-eh-STEEM)
    Pronunciation of dictionary term "self-esteem"
    A feeling of self-worth, self-confidence, and self-respect.
  selinexor: (SEH-lih-NEK-sor)
    Pronunciation of dictionary term "selinexor"
    A drug used alone or with other drugs to treat adults with certain types of diffuse large B-cell lymphoma or multiple myeloma. It is used in patients whose cancer has already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Selinexor blocks a protein called CRM1, which may help keep cancer cells from growing and may kill them. It is a type of small molecule inhibitor. Also called Xpovio.
    More Information
    - Selinexor (https://www.cancer.gov/about-cancer/treatment/drugs/selinexor)
  sella turcica: (SEL-uh TER-sih-kuh)
    Pronunciation of dictionary term "sella turcica"
    A depression of the bone at the base of the skull where the pituitary gland is located.
  selpercatinib: (SEL-per-KA-tih-nib)
    Pronunciation of dictionary term "selpercatinib"
    A drug used to treat certain types of non-small cell lung cancer in adults and certain types of thyroid cancer or other solid tumor in adults and children aged 2 years and older. It is used in patients whose cancer has an abnormal RET gene. It is also being studied in the treatment of other types of cancer. Selpercatinib blocks certain proteins, including those made by the RET fusion gene or the mutated RET gene. Blocking these proteins may help keep cancer cells from growing. Selpercatinib is a type of tyrosine kinase inhibitor. Also called Retevmo.
    More Information
    - Selpercatinib (https://www.cancer.gov/about-cancer/treatment/drugs/selpercatinib)
  selumetinib sulfate: (SEL-yoo-MEH-tih-nib SUL-fayt)
    Pronunciation of dictionary term "selumetinib sulfate"
    A drug used to treat children aged 2 years and older with a rare genetic condition called neurofibromatosis type 1. It is used in patients who have plexiform neurofibromas that are causing symptoms and cannot be removed by surgery. It is also being studied in the treatment of some types of cancer. Selumetinib sulfate blocks proteins called MEK1 and MEK2, which may help keep abnormal cells or cancer cells from growing. It is a type of kinase inhibitor. Also called AZD6244, Koselugo, and MEK inhibitor AZD6244.
    More Information
    - Selumetinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/selumetinibsulfate)
  semaxanib: (seh-MAK-suh-nib)
    Pronunciation of dictionary term "semaxanib"
    A substance that has been studied in the treatment of cancer. It belongs to the families of drugs called angiogenesis inhibitors and tyrosine kinase inhibitors. Also called SU5416.
  semen: (SEE-men)
    Pronunciation of dictionary term "semen"
    The fluid that is released through the penis during orgasm. Semen is made up of sperm from the testicles and fluid from the prostate and other sex glands.
  seminal fluid: (SEH-mih-nul FLOO-id)
    Pronunciation of dictionary term "seminal fluid"
    Fluid from the prostate and other sex glands that helps transport sperm out of the man's body during orgasm. Seminal fluid contains sugar as an energy source for sperm.
  seminal vesicle: (SEH-mih-nul VEH-sih-kul)
    Pronunciation of dictionary term "seminal vesicle"
    A gland that helps produce semen.
  seminal vesicle biopsy: (SEH-mih-nul VEH-sih-kul BY-op-see)
    Pronunciation of dictionary term "seminal vesicle biopsy"
    The removal of fluid or tissue with a needle from the seminal vesicles for examination under a microscope. The seminal vesicles are glands in the male reproductive tract that produce a part of semen.
  seminoma: (SEH-mih-NOH-muh)
    Pronunciation of dictionary term "seminoma"
    A type of cancer that begins in germ cells in males. Germ cells are cells that form sperm in males or eggs in females. Seminomas occur most often in the testicle, but they may also occur in other areas of the body, such as the brain, chest, or abdomen. Seminomas tend to grow and spread slowly. Some seminomas make a hormone called beta-human chorionic gonadotropin (beta-HCG) that may cause signs and symptoms of disease. Seminomas usually occur in young men.
  semiparasitic: (SEH-mee-PAYR-uh-SIH-tik)
    Pronunciation of dictionary term "semiparasitic"
    In botany, a plant that gets food from a host but also contains chlorophyll and is capable of photosynthesis.
  semustine: (seh-MUS-teen)
    Pronunciation of dictionary term "semustine"
    A substance that has been studied in the treatment of some types of cancer. Semustine damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent and a type of nitrosourea.
  Seneca Valley virus-001: (SEH-nih-kuh VA-lee VY-rus…)
    Pronunciation of dictionary term "Seneca Valley virus-001"
    A virus being studied in the treatment of neuroendocrine tumors and other types of cancer. Neuroendocrine tumors form from cells that release hormones in response to a signal from the nervous system. The virus infects and breaks down these tumor cells but not normal cells. It is a type of oncolytic virus. Also called NTX-010 and SVV-001.
  senega root: (SEH-neh-guh root)
    Pronunciation of dictionary term "senega root"
    The root of an herb called Polygala senega. It has been used in some cultures to treat certain medical problems, including problems of the respiratory system.
  senescence: (seh-NEH-sents)
    Pronunciation of dictionary term "senescence"
    The process of growing old. In biology, senescence is a process by which a cell ages and permanently stops dividing but does not die. Over time, large numbers of old (or senescent) cells can build up in tissues throughout the body. These cells remain active and can release harmful substances that may cause inflammation and damage to nearby healthy cells. Senescence may play a role in the development of cancer and other diseases.
  senile keratosis: (SEE-nile KAYR-uh-TOH-sis)
    Pronunciation of dictionary term "senile keratosis"
    A thick, scaly patch of skin that may become cancer. It usually forms on areas exposed to the sun, such as the face, scalp, back of the hands, or chest. It is most common in people with fair skin. Also called actinic keratosis and solar keratosis.
  senses: (SENT-ses)
    Pronunciation of dictionary term "senses"
    In medicine, the ways in which the body receives signals from the environment. The five human senses are sight, hearing, smell, taste, and touch. The body receives signals through the sense organs (the eyes, ears, nose, tongue, and skin). These organs have special nerves that send signals to the brain. The brain processes these signals and then sends information back to the rest of the body to tell it how to respond to the signal. Aging, certain diseases or conditions, and some types of medicines or treatments can affect the senses.
  sensitivity: (SEN-sih-TIH-vih-tee)
    Pronunciation of dictionary term "sensitivity"
    In medicine, sensitivity may describe how well a test can detect a specific disease or condition in people who actually have the disease or condition. No test has 100% sensitivity because some people who have the disease or condition will not be identified by the test (false-negative test result). Sensitivity may also refer to the way the body reacts to the environment or to drugs, chemicals, or other substances. For example, a person who is sensitive to the sun may have skin that burns easily or get a rash when exposed to the sun. A person who is sensitive to caffeine may need only small amounts of it to feel its effects.
  sensor: (SEN-sor)
    Pronunciation of dictionary term "sensor"
    A device that responds to a stimulus, such as heat, light, or pressure, and generates a signal that can be measured or interpreted.
  Sensorcaine: (SEN-sor-kane)
    Pronunciation of dictionary term "Sensorcaine"
    A drug used to relieve pain by blocking signals at nerve endings. It is being studied in the relief of pain following surgery for cancer. It is a type of local anesthetic. Also called bupivacaine hydrochloride and Marcaine.
  sensory: (SEN-sor-ee)
    Pronunciation of dictionary term "sensory"
    Having to do with the senses.
  sentinel lymph node: (SEN-tih-nul limf node)
    Pronunciation of dictionary term "sentinel lymph node"
    The first lymph node to which cancer is likely to spread from the primary tumor. When cancer spreads, the cancer cells may appear first in the sentinel node before spreading to other lymph nodes.
    More Information
    - Sentinel Lymph Node Biopsy (https://www.cancer.gov/about-cancer/diagnosis-staging/staging/sentinel-node-biopsy-fact-sheet)
  sentinel lymph node biopsy: (SEN-tih-nul limf node BY-op-see)
    Pronunciation of dictionary term "sentinel lymph node biopsy"
    Removal and examination of the sentinel node(s) (the first lymph node(s) to which cancer cells are likely to spread from a primary tumor). To identify the sentinel lymph node(s), the surgeon injects a radioactive substance, blue dye, or both near the tumor. The surgeon then uses a probe to find the sentinel lymph node(s) containing the radioactive substance or looks for the lymph node(s) stained with dye. The surgeon then removes the sentinel node(s) to check for the presence of cancer cells.
    More Information
    - Sentinel Lymph Node Biopsy (https://www.cancer.gov/about-cancer/diagnosis-staging/staging/sentinel-node-biopsy-fact-sheet)
    Sentinel lymph node biopsy of the skin. A radioactive substance and/or blue dye is injected near the tumor (first panel). The injected material is detected visually and/or with a probe that detects radioactivity (middle panel). The sentinel nodes (the first lymph nodes to take up the material) are removed and checked for cancer cells (last panel).
    Sentinel lymph node biopsy of the skin. The first of three panels shows a radioactive substance and/or blue dye injected near the tumor; the middle panel shows that the injected material is followed visually and/or with a probe that detects radioactivity to find the sentinel nodes (the first lymph nodes to take up the material); the third panel shows the removal of the tumor and the sentinel nodes to check for cancer cells.
    Sentinel lymph node biopsy of the breast. A radioactive substance and/or blue dye is injected near the tumor (first panel). The injected material is followed visually and/or with a probe that detects radioactivity to find the sentinel nodes (the first lymph nodes to which cancer cells are likely to spread from a primary tumor) (second panel). The sentinel nodes are removed and checked for cancer cells (third panel). A sentinel lymph node biopsy is usually done at the same time the primary tumor is removed, but it can also be done before or after the tumor is removed.
    Sentinel lymph node biopsy of the breast; the first panel shows a radioactive substance and/or blue dye being injected near the tumor; the second panel shows that the injected material is followed visually and/or with a probe that detects radioactivity to find the sentinel nodes (the first lymph nodes to which cancer cells are likely to spread from a primary tumor); and the third panel shows the removal of the tumor and the sentinel nodes to check for cancer cells.
  sentinel lymph node mapping: (SEN-tih-nul limf node MA-ping)
    Pronunciation of dictionary term "sentinel lymph node mapping"
    The use of dyes and radioactive substances to identify the first lymph node to which cancer is likely to spread from the primary tumor. Cancer cells may appear first in the sentinel node before spreading to other lymph nodes and other places in the body.
    More Information
    - Sentinel Lymph Node Biopsy (https://www.cancer.gov/about-cancer/diagnosis-staging/staging/sentinel-node-biopsy-fact-sheet)
  seocalcitol: (see-oh-KAL-sih-tol)
    Pronunciation of dictionary term "seocalcitol"
    A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called vitamin D analogs.
  sepsis: (SEP-sis)
    Pronunciation of dictionary term "sepsis"
    An extreme immune response to infection that can lead to tissue damage, organ failure, or death if not treated right away. Sepsis occurs when chemicals released by the body into the bloodstream to fight an infection trigger inflammation, blood clots, and leaky blood vessels throughout the body. This reduces blood flow and the amount of oxygen and nutrients to the body’s tissues and organs. Bacterial infections are the most common cause of sepsis, but it can also be caused by other types of infections. Signs and symptoms may include fever or very low body temperature, chills, fast heart rate, rapid or trouble breathing, warm or sweaty skin, confusion, and severe pain. Sepsis can occur in anyone with an infection, but is more common in older adults, infants, pregnant women, or people who are in the hospital or who have a weakened immune system, chronic medical condition, or severe injury or illness.
  septate: (SEP-tate)
    Pronunciation of dictionary term "septate"
    An organ or structure that is divided into compartments.
  septicemia: (SEP-tih-SEE-mee-uh)
    Pronunciation of dictionary term "septicemia"
    Disease caused by the spread of bacteria and their toxins in the bloodstream. Also called blood poisoning and toxemia.
  sequential AC/Taxol-Trastuzumab regimen: (see-KWEN-shul … TAK-sol-tras-TOO-zoo-mab REH-jih-men)
    Pronunciation of dictionary term "sequential AC/Taxol-Trastuzumab regimen"
    An abbreviation for a chemotherapy combination used to treat breast cancer. It includes the drugs doxorubicin hydrochloride (Adriamycin) and cyclophosphamide, followed by treatment with paclitaxel (Taxol) and trastuzumab (Herceptin). Also called AC-T-T, AC-T-T regimen, and AC-TH regimen.
  sequential treatment: (see-KWEN-shul TREET-ment)
    Pronunciation of dictionary term "sequential treatment"
    One treatment after the other.
  SERD: A drug that binds to and breaks down proteins called estrogen receptors (ERs), which are found inside the cells of female reproductive tissue, breast tissue, and other types of tissue, and some cancer cells. These drugs keep the hormone estrogen from binding to the ERs inside the cells and block the effects of estrogen in the body. Some breast cancer cells and other types of cancer cells have ERs and may need estrogen to grow. Treatment with SERDs may keep these cancer cells from growing. Examples of SERDs that have been approved to treat some types of breast cancer are fulvestrant and elacestrant. Also called selective estrogen receptor degrader.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  SERM: A drug that acts like estrogen on some tissues but blocks the effect of estrogen on other tissues. Tamoxifen and raloxifene are SERMs. Also called selective estrogen receptor modulator.
    More Information
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  seroconversion: (SEER-oh-kun-VER-zhun)
    Pronunciation of dictionary term "seroconversion"
    The production of antibodies (proteins) in the blood of a person who did not have the antibodies before. It occurs after vaccination or exposure to a virus or other substance. Testing for seroconversion can be used to look for the presence of an infection or disease or to see how well the body’s immune system responds to a vaccine.
  serology: (seh-RAH-loh-jee)
    Pronunciation of dictionary term "serology"
    The examination of antibodies and other substances in the serum (clear liquid part of the blood). Serology tests are used to look for the presence of antibodies in the blood that show whether a person has been exposed to a virus or other infectious agent.
  serology test: (seh-RAH-loh-jee …)
    Pronunciation of dictionary term "serology test"
    A laboratory test that checks for the presence of antibodies or other substances in a blood sample. Antibodies are proteins made by the body’s immune system in response to a foreign substance or microorganism, such as a virus. Serology tests look for certain antibodies to see whether a person has been exposed to or infected with a virus or other infectious agent. Sometimes antibodies are made against the body’s own tissues. In that case, serology tests are used to look for those antibodies and help diagnose certain immune system disorders, such as autoimmune disorders and immunodeficiency disorders. Serology tests are also used to determine a person’s blood or tissue type.
  seroma: (see-ROH-muh)
    Pronunciation of dictionary term "seroma"
    A mass or lump caused by a buildup of clear fluid in a tissue, organ, or body cavity. It usually goes away on its own but may need to be drained with a needle. It often occurs after breast surgery.
  Seromycin: (SAYR-oh-MY-sin)
    Pronunciation of dictionary term "Seromycin"
    A drug used to treat tuberculosis. It is also being studied in the treatment of pain and nerve problems (numbness, tingling) caused by chemotherapy and in the treatment of low back pain, autism, certain anxiety disorders, and schizophrenia. Seromycin is a type of antibiotic. Also called D-cycloserine.
  seronegative: (SEER-oh-NEH-guh-tiv)
    Pronunciation of dictionary term "seronegative"
    Describes a laboratory test result that shows that a substance the test is supposed to find, such as an antibody, is not present at all or is present in very small amounts. Antibodies are proteins made by the body’s immune system in response to a foreign substance or microorganism, such as a virus. A seronegative test result usually means that a person has not been exposed to or infected with a virus or other infectious agent and has not made antibodies against that agent. Sometimes antibodies are made against the body’s own tissues. In that case, a seronegative test result means that a person does not have the antibodies or other markers for a certain disease, such as an autoimmune disease. More testing may be needed to make sure a seronegative test result is correct.
  seropositive: (SEER-oh-PAH-zih-tiv)
    Pronunciation of dictionary term "seropositive"
    Describes a laboratory test result that shows the presence of a specific marker, usually an antibody, in the blood. Antibodies are proteins made by the body’s immune system in response to a foreign substance or microorganism, such as a virus. A seropositive test result usually means that a person has been exposed to or infected with a virus or other infectious agent and has made antibodies against it. Sometimes antibodies are made against the body’s own tissues. In that case, a seropositive test result means that a person has antibodies or other markers for a certain disease, such as an autoimmune disease. More testing may be needed to make a diagnosis or to make sure a seropositive test result is correct.
  seroprevalence: (SEER-oh-PREH-vih-lents)
    Pronunciation of dictionary term "seroprevalence"
    The percentage of people in a population who have proteins called antibodies in their blood that show they have been exposed to a virus or other infectious agent. For example, studying the seroprevalence of antibodies to a specific virus can show how many people have been infected with that virus.
  serosa: (seh-ROH-suh)
    Pronunciation of dictionary term "serosa"
    The outer lining of organs and body cavities of the abdomen and chest, including the stomach. Also called serous membrane.
  serotonin: (SAYR-uh-TOH-nin)
    Pronunciation of dictionary term "serotonin"
    A substance that is found mostly in the digestive tract, central nervous system (brain and spinal cord), and platelets. Serotonin acts both as a neurotransmitter (a substance that nerves use to send messages to one another) and a vasoconstrictor (a substance that causes blood vessels to narrow). A low level of serotonin in the brain is thought to be a cause of depression. Also called 5-hydroxytryptamine.
  serotonin-norepinephrine reuptake inhibitor: (sayr-uh-TOH-nin-NOR-eh-pih-NEH-frin ree-UP-tayk in-HIH-bih-ter)
    Pronunciation of dictionary term "serotonin-norepinephrine reuptake inhibitor"
    A type of drug that is used to treat depression and some other conditions. Serotonin-norepinephrine reuptake inhibitors stop or delay substances called serotonin and norepinephrine from being reabsorbed in the brain, which leaves more of them available for the brain to use. Raising serotonin and norepinephrine levels can help regulate mood and relieve depression and chronic pain. Serotonin-norepinephrine reuptake inhibitors include drugs such as duloxetine and venlafaxine. Also called SNRI.
  serotype: (SEER-oh-tipe)
    Pronunciation of dictionary term "serotype"
    Describes a way of grouping cells or microorganisms, such as bacteria or viruses, based on the antigens or other molecules found on their surfaces. For example, human papillomaviruses (HPVs) are a group of many related viruses, and each virus in the group has its own serotype. The serotypes can cause the viruses to behave differently when they infect people. For example, some HPV serotypes can cause benign (not cancer) tissue growth, such as warts, while others can cause certain types of cancer.
  serous: (SEER-us)
    Pronunciation of dictionary term "serous"
    Having to do with serum, the clear liquid part of blood.
  serous membrane: (SEER-us MEM-brayn)
    Pronunciation of dictionary term "serous membrane"
    The outer lining of organs and body cavities of the abdomen and chest, including the stomach. Also called serosa.
  serrated polyp: (SER-ray-ted PAH-lip)
    Pronunciation of dictionary term "serrated polyp"
    A type of polyp (abnormal growth) that usually forms on the inner lining of the colon or rectum but can also form in the appendix. Serrated polyps have a saw-tooth appearance when looked at under a microscope. There are three types of serrated polyps: hyperplastic polyps (HPs), sessile (flat) serrated polyps (SSPs, also known as sessile serrated adenomas or SSAs), and traditional serrated adenomas (TSAs). HPs are usually small and rarely become cancer. They are the most common type of serrated polyp. SSPs and TSAs are larger than HPs and are more likely to become cancer if they are not removed.
  Sertoli cell tumor: (ser-TOH-lee sel TOO-mer)
    Pronunciation of dictionary term "Sertoli cell tumor"
    A rare tumor that usually forms in the testicles. It may also form in the ovaries, but this is very rare. Sertoli cell tumors may be benign (not cancer) or malignant (cancer). They tend to have a good prognosis if diagnosed and treated early. They can occur in both adults and children. Sertoli cell tumors are a type of sex cord-stromal tumor.
  Sertoli-Leydig cell tumor: (ser-TOH-lee-LY-dig sel TOO-mer)
    Pronunciation of dictionary term "Sertoli-Leydig cell tumor"
    A rare tumor that forms in the tissues that surround and support the ovaries. Sertoli-Leydig cell tumors make a male sex hormone called testosterone. These tumors can cause the appearance of male physical features, such as facial hair, a deep voice, and other symptoms. Sertoli-Leydig cell tumors may be benign (not cancer) or malignant (cancer). They tend to have a good prognosis if diagnosed and treated early. Sertoli-Leydig cell tumors are a type of sex cord-stromal tumor. Also called androblastoma and arrhenoblastoma.
  sertraline: (SER-truh-leen)
    Pronunciation of dictionary term "sertraline"
    A drug used to treat depression. It is a type of selective serotonin reuptake inhibitor (SSRI). Also called Zoloft.
  serum: (SEER-um)
    Pronunciation of dictionary term "serum"
    The clear liquid part of the blood that remains after blood cells and clotting proteins have been removed.
  serum albumin: (SEER-um al-BYOO-min)
    Pronunciation of dictionary term "serum albumin"
    The main protein in blood plasma. Low levels of serum albumin occur in people with malnutrition, inflammation, and serious liver and kidney disease.
  serum glutamate pyruvate transaminase: (SEER-um GLOO-tuh-mayt py-ROO-vayt tranz-A-mih-nays)
    Pronunciation of dictionary term "serum glutamate pyruvate transaminase"
    An enzyme found in the liver and other tissues. A high level of serum glutamate pyruvate transaminase released into the blood may be a sign of liver damage, cancer, or other diseases. Also called alanine transferase and SGPT.
  serum glutamic-oxaloacetic transaminase: (SEER-um gloo-TA-mik-ok-SA-loh-uh-SEE-tik tranz-A-mih-nays)
    Pronunciation of dictionary term "serum glutamic-oxaloacetic transaminase"
    An enzyme found in the liver, heart, and other tissues. A high level of serum glutamic-oxaloacetic transaminase released into the blood may be a sign of liver or heart damage, cancer, or other diseases. Also called aspartate transaminase and SGOT.
  serum tumor marker test: (SEER-um TOO-mer MAR-ker ...)
    Pronunciation of dictionary term "serum tumor marker test"
    A blood test that measures the amount of substances called tumor markers (or biomarkers). Tumor markers are released into the blood by tumor cells or by other cells in response to tumor cells. A high level of a tumor marker may be a sign of cancer.
  Serzone: (SER-zone)
    Pronunciation of dictionary term "Serzone"
    A drug used to treat depression. It belongs to the family of drugs called antidepressant agents. Also called nefazodone.
  SES: A way of describing people based on their education, income, and type of job. SES is usually described as low, medium, and high. People with a lower SES usually have less access to financial, educational, social, and health resources than those with a higher SES. As a result, they are more likely to be in poor health and have chronic health conditions and disabilities. Also called socioeconomic status.
  sesquiterpene lactone: (SES-kwih-TER-peen LAK-tone)
    Pronunciation of dictionary term "sesquiterpene lactone"
    A substance found in some plants. Sesquiterpene lactones may have anti-inflammatory and anticancer effects. Plants containing sesquiterpene lactones have been used in some cultures to treat certain medical problems.
  sestamibi breast imaging: (SES-tuh-MIH-bee brest IH-muh-jing)
    Pronunciation of dictionary term "sestamibi breast imaging"
    A type of breast imaging test that is used to detect cancer cells in the breasts of some women who have had abnormal mammograms, or who have dense breast tissue. It is not used for screening or in place of a mammogram. In this test, a woman receives an injection of a small amount of a radioactive substance called technetium 99, which is taken up by cancer cells, and a gamma camera is used to take pictures of the breasts. Also called Miraluma test and scintimammography.
  sestamibi scan: (SES-tuh-MIH-bee...)
    Pronunciation of dictionary term "sestamibi scan"
    An imaging test used to find overactive parathyroid glands (four pea-sized glands found on the thyroid) and breast cancer cells, and to diagnose heart disease. The patient receives an injection of a small amount of a radioactive substance called technetium which is bound to another substance called sestamibi. This substance collects in overactive glands, cancer cells, heart muscle, or other tissues and a picture is taken by a gamma camera (a special camera that detects radioactivity).
  seventh cranial nerve: (SEH-venth KRAY-nee-ul nerv)
    Pronunciation of dictionary term "seventh cranial nerve"
    A nerve that runs from the brainstem, through openings in the skull, to the face and tongue. The seventh cranial nerve sends information between the brain and the muscles used in facial expression (such as smiling and frowning), some muscles in the jaw, and the muscles of a small bone in the middle ear. It also sends information to the front part of the tongue for the sense of taste and to the outer parts of the ear. The seventh cranial nerve also stimulates the glands that make tears and saliva. It is a type of cranial nerve. There are two facial nerves, one on each side of the face. Also called facial nerve.
  severe acute respiratory syndrome coronavirus 2: (seh-VEER uh-KYOOT RES-pih-ruh-TOR-ee SIN-drome kuh-ROH-nuh-VY-rus …)
    Pronunciation of dictionary term "severe acute respiratory syndrome coronavirus 2"
    The virus that causes a respiratory disease called coronavirus disease 19 (COVID-19). Severe acute respiratory syndrome coronavirus 2 is a member of a large family of viruses called coronaviruses. These viruses can infect people and some animals. Severe acute respiratory syndrome coronavirus 2 was first known to infect people in 2019. The virus is thought to spread from person to person through droplets released when an infected person coughs, sneezes, or talks. It may also be spread by touching a surface with the virus on it and then touching one’s mouth, nose, or eyes, but this is less common. Research is being done to treat COVID-19 and to prevent infection with severe acute respiratory syndrome coronavirus 2. Also called SARS-CoV-2.
    More Information
    - COVID-19: What People with Cancer Should Know (https://www.cancer.gov/contact/emergency-preparedness/coronavirus)
    - COVID-19 (Centers for Disease Control and Prevention) (https://www.cdc.gov/coronavirus/2019-ncov/index.html)
  severe combined immunodeficiency disease: (seh-VEER kum-BIND IH-myoo-noh-deh-FIH-shun-see dih-ZEEZ)
    Pronunciation of dictionary term "severe combined immunodeficiency disease"
    A rare, inherited disease that is marked by a lack of B lymphocytes (white blood cells that make antibodies and help fight infections) and a lack of T lymphocytes (white blood cells that attack virus-infected cells, foreign cells, and cancer cells). Patients with this disease have a high risk of developing viral, bacterial, and fungal infections. Also called SCID.
    More Information
    - Severe combined immunodeficiency (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7628/severe-combined-immunodeficiency)
  severe myelosuppression: (... MY-eh-loh-suh-PREH-shun)
    Pronunciation of dictionary term "severe myelosuppression"
    A severe form of myelosuppression. Myelosuppression is a condition in which bone marrow activity is decreased, resulting in fewer red blood cells, white blood cells, and platelets. It is a side effect of some cancer treatments. Also called myeloablation.
  sex cell: (... sel)
    Pronunciation of dictionary term "sex cell"
    An egg cell in females or sperm cell in males. Each mature sex cell contains 23 chromosomes. When an egg combines with sperm, the fertilized egg normally contains a total of 46 chromosomes. Also called gamete and reproductive cell.
  sex cord tumor: (… kord TOO-mer)
    Pronunciation of dictionary term "sex cord tumor"
    A rare type of cancer that forms in the tissues that support the ovaries or testes. These tumors may release sex hormones. Sex cord tumors include granulosa cell, Sertoli cell, and Leydig cell tumors. Also called sex cord-gonadal stromal tumor and sex cord-stromal tumor.
  sex cord-gonadal stromal tumor: (… kord-goh-NA-dul STROH-mul TOO-mer)
    Pronunciation of dictionary term "sex cord-gonadal stromal tumor"
    A rare type of cancer that forms in the tissues that support the ovaries or testes. These tumors may release sex hormones. Sex cord-gonadal stromal tumors include granulosa cell, Sertoli cell, and Leydig cell tumors. Also called sex cord tumor and sex cord-stromal tumor.
  sex cord-stromal tumor: (… kord-STROH-mul TOO-mer)
    Pronunciation of dictionary term "sex cord-stromal tumor"
    A rare type of cancer that forms in the tissues that support the ovaries or testes. These tumors may release sex hormones. Sex cord-stromal tumors include granulosa cell, Sertoli cell, and Leydig cell tumors. Also called sex cord tumor and sex cord-gonadal stromal tumor.
  sex drive: (sex drive)
    Pronunciation of dictionary term "sex drive"
    The need for sex. Also called sexual drive.
    More Information
    - Sexual Health Issues in Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-men)
    - Sexual Health Issues in Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-women)
  sexual drive: (SEK-shoo-ul …)
    Pronunciation of dictionary term "sexual drive"
    The need for sex. Also called sex drive.
    More Information
    - Sexual Health Issues in Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-men)
    - Sexual Health Issues in Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-women)
  sexuality: (SEK-shoo-A-lih-tee)
    Pronunciation of dictionary term "sexuality"
    A person's behaviors, desires, and attitudes related to sex and physical intimacy with others.
    More Information
    - Sexual Health Issues in Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-men)
    - Sexual Health Issues in Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-women)
  sexually transmitted disease: (SEK-shoo-wul-ee tranz-MIH-ted dih-ZEEZ)
    Pronunciation of dictionary term "sexually transmitted disease"
    A disease caused by infection with certain bacteria, viruses, or other microorganisms that can be passed from one person to another through blood, semen, vaginal fluids, or other body fluids, during oral, anal, or genital sex with an infected partner. These diseases can also be spread through sharing needles, blood transfusions, breastfeeding, or from an infected mother to an infant during pregnancy and childbirth. Symptoms of sexually transmitted diseases may include sores, blisters, or bumps on the genitals or in the mouth or rectal area, pain or burning during urination or sex, unusual drainage or bleeding from the penis or vagina, itching and redness in the genital or anal area, pain in the lower abdomen, fever, and sore, swollen lymph nodes, especially in the groin. There are many types of sexually transmitted diseases, including human papillomavirus (HPV), HIV, genital herpes, chlamydia, gonorrhea, and syphilis. If not treated, some sexually transmitted diseases can lead to long-term health problems. Also called sexually transmitted infection, STD, and STI.
  sexually transmitted infection: (SEK-shoo-wul-ee tranz-MIH-ted in-FEK-shun)
    Pronunciation of dictionary term "sexually transmitted infection"
    A disease caused by infection with certain bacteria, viruses, or other microorganisms that can be passed from one person to another through blood, semen, vaginal fluids, or other body fluids, during oral, anal, or genital sex with an infected partner. These diseases can also be spread through sharing needles, blood transfusions, breastfeeding, or from an infected mother to an infant during pregnancy and childbirth. Symptoms of sexually transmitted infections may include sores, blisters, or bumps on the genitals or in the mouth or rectal area, pain or burning during urination or sex, unusual drainage or bleeding from the penis or vagina, itching and redness in the genital or anal area, pain in the lower abdomen, fever, and sore, swollen lymph nodes, especially in the groin. There are many types of sexually transmitted infections, including human papillomavirus (HPV), HIV, genital herpes, chlamydia, gonorrhea, and syphilis. If not treated, some sexually transmitted infections can lead to long-term health problems. Also called sexually transmitted disease, STD, and STI.
  SGI-110: A substance being studied in the treatment of some types of cancer. SGI-110 may stop the growth of tumor cells by blocking some of the enzymes needed for cells to divide. It may also make cancer cells more sensitive to other anticancer drugs. SGI-110 is a type of antimetabolite Also called guadecitabine.
  SGN-00101: A substance that is being studied in the prevention of cancer. It belongs to the family of drugs called fusion proteins.
  SGN-30: A monoclonal antibody that binds to cells that have the CD30 antigen on their surface, including Hodgkin disease cells and cells from anaplastic large cell lymphoma, and cutaneous T-cell lymphoma. SGN-30 is being studied in the treatment of cancer. It is a type of monoclonal antibody.
  SGN-35: A drug used alone or with other drugs to treat adults with certain types of classic Hodgkin lymphoma, cutaneous or systemic anaplastic large cell lymphoma, large B-cell lymphoma, mycosis fungoides, or peripheral T-cell lymphoma, and with other drugs to treat children aged 2 years and older with certain types of classic Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. SGN-35 contains a monoclonal antibody that binds to a protein called CD30, which is found on some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. SGN-35 is a type of antibody-drug conjugate. Also called Adcetris and brentuximab vedotin.
    More Information
    - Brentuximab Vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/brentuximabvedotin)
  SGN-40: A monoclonal antibody that binds to cells that have the CD40 antigen on their surface, including cells from multiple myeloma, non-Hodgkin lymphoma, and chronic lymphocytic leukemia. SGN-40 is being studied in the treatment of cancer. It is a type of monoclonal antibody.
  SGOT: An enzyme found in the liver, heart, and other tissues. A high level of SGOT released into the blood may be a sign of liver or heart damage, cancer, or other diseases. Also called aspartate transaminase and serum glutamic-oxaloacetic transaminase.
  SGPT: An enzyme found in the liver and other tissues. A high level of SGPT released into the blood may be a sign of liver damage, cancer, or other diseases. Also called alanine transferase and serum glutamate pyruvate transaminase.
  sham-controlled: (... kun-TROLD)
    Pronunciation of dictionary term "sham-controlled"
    An inactive procedure that is designed to mimic as closely as possible the active procedure being studied in a clinical trial. For example, in sham acupuncture, needles that look and feel like the needles used in active acupuncture therapy are used except the needles are not actually inserted into the skin.
    More Information
    - Acupuncture
  shared decision making: (… deh-SIH-zhun MAY-king)
    Pronunciation of dictionary term "shared decision making"
    In medicine, a process in which both the patient and health care professional work together to decide the best plan of care for the patient. When making a shared decision, the patient’s values, goals, and concerns are considered. Shared decision making helps patients learn more about their health condition, the different testing and treatment options that may be available, and the possible risks and benefits of each option. It is often used when important medical decisions need to be made, such as about having a genetic test or cancer screening test, having major surgery, or taking a medicine over a long time.
  shave biopsy: (shayv BY-op-see)
    Pronunciation of dictionary term "shave biopsy"
    A procedure in which a skin abnormality and a thin layer of surrounding skin are removed with a small blade for examination under a microscope. Stitches are not needed with this procedure.
  sheep sorrel: (sheep SOR-ul)
    Pronunciation of dictionary term "sheep sorrel"
    A plant that has been used in some cultures to treat certain medical problems. It may have anticancer effects. The scientific name is Rumex acetosella. Also called dock and sorrel.
  Sheridan’s Formula: (SHAYR-ih-dunz FOR-myoo-luh)
    Pronunciation of dictionary term "Sheridan’s Formula"
    A liquid mixture that has been promoted as a treatment for cancer and other diseases. None of the ingredients thought to be in Sheridan’s Formula have been shown to be effective in preventing or treating any type of cancer. Since 1989, it has been illegal in the United States to make, sell, or give Sheridan’s Formula as a treatment for any disease. Also called 126–F, Cancell, Cantron, Jim’s Juice, JS–101, JS–114, and Protocel.
    More Information
    - Cancell/Cantron/Protocel
  shiitake mushroom: (shee-TAH-kee ...)
    Pronunciation of dictionary term "shiitake mushroom"
    A dark oriental mushroom widely used as a food. Several anticancer substances have been found in shiitake mushrooms, including lentinan, which has been studied in Japan as a treatment for stomach and colorectal cancer. The scientific name is Lentinus edodes.
  shinbone: (SHIN-bone)
    Pronunciation of dictionary term "shinbone"
    The larger of two bones between the knee and ankle. Also called tibia.
  shingles: (SHING-gulz)
    Pronunciation of dictionary term "shingles"
    A common condition that occurs when the virus that causes chickenpox is reactivated in the body. After having chickenpox, the virus stays inactive in the body, usually in the nerves along the spinal cord or at the base of the skull. The virus can become active again many years later and cause shingles. Shingles is marked by a painful rash that usually appears as small clusters of blisters. The blisters often form a band across the skin on one side of the body, especially on the chest, back, waist, or face. The pain in the affected area can last for many weeks or months after the rash disappears. Other symptoms may include fever, chills, headache, fatigue, and upset stomach. Shingles is most common in older adults and in those who have a weakened immune system. It cannot be passed from person to person, but those who have never had chickenpox or the chickenpox vaccine can develop chickenpox if they come in contact with a person who has shingles. Vaccines are available to prevent shingles. Also called herpes zoster.
  Sho-saiko-to: (shoh-sah-ee-koh-toh)
    Pronunciation of dictionary term "Sho-saiko-to"
    A Japanese formulation of seven Chinese herbs that is being studied as a treatment for cancer.
  short-term side effect: (... eh-FEKT)
    Pronunciation of dictionary term "short-term side effect"
    A problem that is caused by treatment of a disease but usually goes away after treatment ends. Short-term side effects of cancer treatment include nausea, vomiting, diarrhea, hair loss, fatigue, and mouth sores.
  shoulder blade: (SHOLE-der blayd)
    Pronunciation of dictionary term "shoulder blade"
    One of a pair of triangular bones at the back of the shoulder. The shoulder blade connects the collarbone with the upper arm bone. Also called scapula.
  shunt: (shunt)
    Pronunciation of dictionary term "shunt"
    In medicine, a passage that is made to allow blood or other fluid to move from one part of the body to another. For example, a surgeon may implant a tube to drain cerebrospinal fluid from the brain to the abdomen. A surgeon may also change normal blood flow by making a passage that leads from one blood vessel to another.
  Shwachman syndrome: (SHWAK-mun SIN-drome)
    Pronunciation of dictionary term "Shwachman syndrome"
    A rare, inherited disorder in which the pancreas and bone marrow do not work the way they should. Symptoms include problems digesting food, a low number of neutrophils (a type of white blood cell), bone problems, and being short. Infants with the disorder get bacterial infections and are at an increased risk of aplastic anemia, myelodysplastic syndrome, and leukemia. Also called SDS and Shwachman-Diamond syndrome.
    More Information
    - Shwachman-Diamond syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4863/shwachman-diamond-syndrome)
    - Shwachman-Diamond syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/shwachman-diamond-syndrome/)
  Shwachman-Diamond syndrome: (SHWAK-mun-DY-mund SIN-drome)
    Pronunciation of dictionary term "Shwachman-Diamond syndrome"
    A rare, inherited disorder in which the pancreas and bone marrow do not work the way they should. Symptoms include problems digesting food, a low number of neutrophils (a type of white blood cell), bone problems, and being short. Infants with the disorder get bacterial infections and are at an increased risk of aplastic anemia, myelodysplastic syndrome, and leukemia. Also called SDS and Shwachman syndrome.
    More Information
    - Shwachman-Diamond syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4863/shwachman-diamond-syndrome)
    - Shwachman-Diamond syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/shwachman-diamond-syndrome/)
  sialic acid: (sy-A-lik A-sid)
    Pronunciation of dictionary term "sialic acid"
    Any of a group of simple sugar molecules.
  sialyl Tn-KLH: (sy-A-lil ...)
    Pronunciation of dictionary term "sialyl Tn-KLH"
    A vaccine composed of a substance that enhances immunity plus an antigen found on some tumors of the colon, breast, lung, ovary, pancreas, and stomach.
  sibling: (SIB-ling)
    Pronunciation of dictionary term "sibling"
    A person’s brother or sister who has the same parents.
  sickle cell anemia: (SIH-kul sel uh-NEE-mee-uh)
    Pronunciation of dictionary term "sickle cell anemia"
    An inherited disease in which the red blood cells have an abnormal crescent shape, block small blood vessels, and do not last as long as normal red blood cells. Sickle cell anemia is caused by a mutation (change) in one of the genes for hemoglobin (the substance inside red blood cells that binds to oxygen and carries it from the lungs to the tissues). It is most common in people of West and Central African descent. Also called sickle cell disease.
    More Information
    - Sickle cell anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8614/sickle-cell-anemia)
    - Sickle cell disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/sickle-cell-disease/)
  sickle cell disease: (SIH-kul sel dih-ZEEZ)
    Pronunciation of dictionary term "sickle cell disease"
    An inherited disease in which the red blood cells have an abnormal crescent shape, block small blood vessels, and do not last as long as normal red blood cells. Sickle cell disease is caused by a mutation (change) in one of the genes for hemoglobin (the substance inside red blood cells that binds to oxygen and carries it from the lungs to the tissues). It is most common in people of West and Central African descent. Also called sickle cell anemia.
    More Information
    - Sickle cell anemia (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8614/sickle-cell-anemia)
    - Sickle cell disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/sickle-cell-disease/)
  side effect: (side eh-FEKT)
    Pronunciation of dictionary term "side effect"
    An effect of a drug or other type of treatment that is in addition to or beyond its desired effect. Side effects can be harmful or beneficial, and most go away on their own over time. Others may last past treatment or appear long after treatment has ended. Some common side effects of cancer treatment are nausea, vomiting, fatigue, pain, decreased blood cell counts, hair loss, and mouth sores.
    More Information
    - Side Effects of Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects)
  side-to-end coloanal anastomosis: (... KOH-loh-AY-nul uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "side-to-end coloanal anastomosis"
    A surgical procedure in which the side of the colon is attached to the anus after the rectum has been removed. A section of the colon about 2 inches long is formed into a mini-pouch in order to replace the function of the rectum and store stool until it can be eliminated. This procedure is similar to the J-pouch coloanal anastomosis but a much smaller pouch is formed.
  sideropenic dysphagia: (SIH-der-oh-PEE-nik dis-FAY-jee-uh)
    Pronunciation of dictionary term "sideropenic dysphagia"
    A disorder marked by anemia caused by iron deficiency, and a web-like growth of membranes in the throat that makes swallowing difficult. Having sideropenic dysphagia may increase the risk of developing esophageal cancer. Also called Paterson-Kelly syndrome and Plummer-Vinson syndrome.
    More Information
    - Plummer Vinson syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8259/paterson-kelly-syndrome)
    - Plummer-Vinson syndrome (MedlinePlus) (https://medlineplus.gov/ency/article/001158.htm)
  sidestream smoke: (SIDE-streem …)
    Pronunciation of dictionary term "sidestream smoke"
    Smoke that comes from the lighted end of a burning tobacco product, such as a cigarette, pipe, or cigar. Sidestream smoke can be a form of secondhand smoke. It contains nicotine and many harmful, cancer-causing chemicals. Inhaling sidestream smoke increases the risk of lung cancer and may increase the risk of other types of cancer. Inhaling it also increases the risk of other health problems, such as heart disease and lung disease.
    More Information
    - Secondhand Smoke and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/second-hand-smoke-fact-sheet)
  SIDS: A disorder marked by the sudden and unexpected death of a healthy child who is younger than one year old, usually during sleep. The cause of SIDS is not known. Also called crib death and sudden infant death syndrome.
  sigmoid colon: (SIG-moyd KOH-lun)
    Pronunciation of dictionary term "sigmoid colon"
    The S-shaped section of the colon that connects to the rectum.
    The distal colon includes the descending colon and the sigmoid colon.
    Distal colon; drawing shows parts of the distal colon, including the descending colon and sigmoid colon.
  sigmoidoscope: (sig-MOY-doh-skope)
    Pronunciation of dictionary term "sigmoidoscope"
    A thin, tube-like instrument used to examine the inside of the colon. A sigmoidoscope has a light and a lens for viewing and may have a tool to remove tissue.
  sigmoidoscopy: (sig-MOY-DOS-koh-pee)
    Pronunciation of dictionary term "sigmoidoscopy"
    Examination of the lower colon using a sigmoidoscope, inserted into the rectum. A sigmoidoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. Also called proctosigmoidoscopy.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    Sigmoidoscopy. A thin, lighted tube is inserted through the anus and rectum and into the lower part of the colon to look for abnormal areas.
    Sigmoidoscopy; drawing shows a sigmoidoscope inserted through the anus and rectum and into the sigmoid colon. An inset shows a patient lying on a table having a sigmoidoscopy.
  sign: In medicine, a sign is something found during a physical exam or as a result of a laboratory or imaging test that shows that a person may have a condition or disease. Signs can be observed by a health care provider or other person. Some examples of signs are fever, swelling, skin rash, high blood pressure, and high blood glucose.
  signal transduction: (SIG-nul tranz-DUK-shun)
    Pronunciation of dictionary term "signal transduction"
    The process by which a cell responds to substances outside the cell through signaling molecules found on the surface of and inside the cell. Most molecules that lead to signal transduction are chemical substances, such as hormones, neurotransmitters, and growth factors, that bind to a specific protein receptor (signaling molecule) on or in a cell. The signals are then passed from one molecule to another inside the cell, which results in a specific cell response, such as cell division or cell death. Signal transduction is important for cells to grow and work normally. Cells that have abnormal signaling molecules may become cancer cells. Also called cell signaling.
  signal transduction inhibitor: (SIG-nul tranz-DUK-shun in-HIH-bih-ter)
    Pronunciation of dictionary term "signal transduction inhibitor"
    A substance that blocks signals passed from one molecule to another inside a cell. Blocking these signals can affect many functions of the cell, including cell division and cell death, and may kill cancer cells. Certain signal transduction inhibitors are being studied in the treatment of cancer.
  signaling pathway: (SIG-nuh-ling …)
    Pronunciation of dictionary term "signaling pathway"
    Describes a series of chemical reactions in which a group of molecules in a cell work together to control a cell function, such as cell division or cell death. A cell receives signals from its environment when a molecule, such as a hormone or growth factor, binds to a specific protein receptor on or in the cell. After the first molecule in the pathway receives a signal, it activates another molecule. This process is repeated through the entire signaling pathway until the last molecule is activated and the cell function is carried out. Abnormal activation of signaling pathways may lead to diseases, such as cancer. Drugs are being developed to target specific molecules involved in these pathways. These drugs may help keep cancer cells from growing.
  signature molecule: (SIG-nuh-cher MAH-leh-kyool)
    Pronunciation of dictionary term "signature molecule"
    A biological molecule found in blood, other body fluids, or tissues that is a sign of a normal or abnormal process, or of a condition or disease. A signature molecule may be used to see how well the body responds to a treatment for a disease or condition. Also called biomarker and molecular marker.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  signet ring cell carcinoma: (SIG-nut ... sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "signet ring cell carcinoma"
    A highly malignant type of cancer typically found in glandular cells that line the digestive organs. The cells resemble signet rings when examined under a microscope.
  significant: (sig-NIH-fih-kunt)
    Pronunciation of dictionary term "significant"
    In statistics, describes a mathematical measure of difference between groups. The difference is said to be significant if it is greater than what might be expected to happen by chance alone. Also called statistically significant.
  SIL: An abnormal growth of squamous cells that forms on the surface of certain organs, such as the cervix, vagina, vulva, anus, penis, or back of the throat. Squamous cells are thin, flat cells that look like fish scales under a microscope. SILs may be low grade or high grade, depending on how abnormal the cells look under a microscope and how much of the tissue is affected. They are usually caused by chronic infection with certain types of human papillomavirus (HPV) and are found when a Pap test or biopsy is done. If not treated, some SILs may become cancer and spread into nearby normal tissue. Also called squamous intraepithelial lesion.
  sildenafil: (sil-DEH-nuh-FIL)
    Pronunciation of dictionary term "sildenafil"
    A drug used to treat erectile dysfunction. Sildenafil relaxes the smooth muscle of the penis to allow increased blood flow and erection. It is a type of phosphodiesterase inhibitor. Also called Viagra.
  silicon phthalocyanine 4: (SIH-lih-kon THA-loh-SY-uh-NEEN …)
    Pronunciation of dictionary term "silicon phthalocyanine 4"
    A substance being studied in the treatment of cancer. When absorbed by cancer cells and exposed to light, it becomes active and kills the cancer cells. It is a type of photodynamic therapy agent.
  silicone: (SIH-lih-kone)
    Pronunciation of dictionary term "silicone"
    A synthetic gel that is used as an outer coating on breast implants and as the inside filling of some implants.
  siltuximab: (sil-TUK-sih-mab)
    Pronunciation of dictionary term "siltuximab"
    A drug used to treat a rare condition called multicentric Castleman disease in patients who do not have HIV or human herpesvirus 8. It is also being studied in the treatment of some types of cancer and other conditions. Siltuximab binds to a protein called interleukin-6 (IL-6), which is made by some white blood cells and other cells in the body. Siltuximab may help reduce inflammation and stop the growth of cancer cells or abnormal blood cells. It is a type of monoclonal antibody. Also called anti-IL-6 chimeric monoclonal antibody, cCLB8, CNTO 328, and Sylvant.
    More Information
    - Siltuximab (https://www.cancer.gov/about-cancer/treatment/drugs/siltuximab)
  Silybum marianum: (SIH-lih-bum mayr-ee-AY-num)
    Pronunciation of dictionary term "Silybum marianum"
    A plant that has been used in some cultures to treat certain medical problems, including stomach, liver, and gallbladder disorders. The active extract of Silybum marianum seeds is called silymarin. It is being studied in the prevention of liver damage caused by some cancer treatments. Also called milk thistle.
    More Information
    - Milk Thistle
  silymarin: (SIH-lih-MAYR-in)
    Pronunciation of dictionary term "silymarin"
    A substance obtained from milk thistle seeds that is being studied in the prevention of liver damage caused by certain cancer treatments.
    More Information
    - Milk Thistle
  simian virus 40: (SIH-mee-un VY-rus…)
    Pronunciation of dictionary term "simian virus 40"
    A virus that infects some types of monkeys. It may also infect humans, and was found in some polio vaccines tested in the early 1960s. Although the virus has been shown to cause cancer in laboratory animals, there is no evidence that it causes cancer in people. Also called SV40.
  simple fibroadenoma: (SIM-pul FY-broh-a-deh-NOH-muh)
    Pronunciation of dictionary term "simple fibroadenoma"
    A type of benign (not cancer) tumor that usually forms in the breast and is made up of fibrous (connective) tissue and glandular tissue. When viewed under a microscope, all the cells in a simple fibroadenoma look the same and have clear, defined edges. Simple fibroadenomas are more common in younger women and do not increase the risk of breast cancer.
  simple hysterectomy: (SIM-pul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "simple hysterectomy"
    Surgery to remove the uterus and the cervix. The ovaries and fallopian tubes may also be removed. A simple hysterectomy may be done through the vagina (with no incisions in the abdomen) or through an incision (cut) in the abdomen. Also called complete hysterectomy and total hysterectomy.
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  simple mastectomy: (SIM-pul ma-STEK-toh-mee)
    Pronunciation of dictionary term "simple mastectomy"
    Surgery to remove the whole breast, which may include the nipple, areola (the dark-colored skin around the nipple), and skin over the breast. Some of the lymph nodes under the arm may also be removed to check for cancer. Also called total mastectomy.
    More Information
    - Breast Cancer Treatment
    Total (simple) mastectomy. The whole breast is removed. Some of the lymph nodes under the arm may also be removed.
    Total (simple) mastectomy; drawing shows removal of the whole breast and some of the lymph nodes under the arm.
  simple nephrectomy: (SIM-pul neh-FREK-toh-mee)
    Pronunciation of dictionary term "simple nephrectomy"
    Surgery to remove one kidney.
  simple vulvectomy: (SIM-pul vul-VEK-toh-mee)
    Pronunciation of dictionary term "simple vulvectomy"
    Surgery to remove the entire vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina).
  simulation: (SIM-yoo-LAY-shun)
    Pronunciation of dictionary term "simulation"
    In cancer treatment, a process used to plan radiation therapy so that the target area is precisely located and marked.
  simvastatin: (SIM-vuh-STA-tin)
    Pronunciation of dictionary term "simvastatin"
    A drug used to lower the amount of cholesterol and other harmful substances in the blood, such as triglycerides. It is also being studied in the treatment of cancer and other conditions. Simvastatin blocks an enzyme that helps make cholesterol in the body. It is a type of HMG-CoA reductase inhibitor and a type of statin. Also called Zocor.
  single nucleotide polymorphism: (SING-gul NOO-klee-oh-tide PAH-lee-MOR-fih-zum)
    Pronunciation of dictionary term "single nucleotide polymorphism"
    The most common type of change in DNA (molecules inside cells that carry genetic information). Single nucleotide polymorphisms occur when a single nucleotide (building block of DNA) is replaced with another. These changes may cause disease, and may affect how a person reacts to bacteria, viruses, drugs, and other substances. Also called SNP.
    More Information
    - Single Nucleotide Polymorphisms (SNPs) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Single-Nucleotide-Polymorphisms)
  single-blind study: (SING-gul-blind STUH-dee)
    Pronunciation of dictionary term "single blind study"
    A type of clinical trial in which only the researcher doing the study knows which treatment or intervention the participant is receiving until the trial is over. A single-blind study makes results of the study less likely to be biased. This means that the results are less likely to be affected by factors that are not related to the treatment or intervention being tested.
  single-photon emission computed tomography: (SIN-gul-FOH-ton ee-MIH-shun kum-PYOO-ted toh-MAH-gruh-fee)
    Pronunciation of dictionary term "single-photon emission computed tomography"
    A special type of computed tomography (CT) scan in which a small amount of a radioactive drug is injected into a vein and a scanner is used to make detailed images of areas inside the body where the radioactive material is taken up by the cells. Single-photon emission computed tomography can give information about blood flow to tissues and chemical reactions (metabolism) in the body. Also called SPECT.
  Singulair: (SING-yoo-layr)
    Pronunciation of dictionary term "Singulair"
    A drug used to treat symptoms of asthma, such as trouble breathing, tight chest, wheezing, coughing, and runny nose. Singulair blocks the action of a substance that causes airways in the lungs to narrow and causes other symptoms of asthma. It is a type of leukotriene receptor antagonist and a type of antiasthmatic agent. Also called montelukast sodium.
  sinus: (SY-nus)
    Pronunciation of dictionary term "sinus"
    A cavity, space, or channel in the body. Examples include hollow spaces in the bones at the front of the skull, and channels for blood and lymph. Sinuses may also be found in the heart, brain, kidney, and other organs.
  sinusitis: (SINE-yoo-SY-tis)
    Pronunciation of dictionary term "sinusitis"
    A condition in which the tissue lining the sinuses (small hollow spaces in the bones around the nose) becomes swollen or inflamed. The sinuses are lined with cells that make mucous. Sinusitis can occur when too much mucous builds up in the sinuses or their openings become blocked. It is usually caused by a viral, bacterial, or fungal infection. Signs and symptoms include headache, facial pain or pressure, stuffy or runny nose, sore throat, fever, cough, fatigue, bad breath, and reduced sense of smell and taste. Having certain conditions, such as allergies, nasal polyps (growths) or other nasal problems, a weak immune system, or certain medical conditions (such as cystic fibrosis), may increase the risk of developing sinusitis. Smoking or being exposed to secondhand smoke may also increase the risk of sinusitis.
  sinusoidal obstruction syndrome: (SINE-yoo-SOY-dul ub-STRUK-shun SIN-drome)
    Pronunciation of dictionary term "sinusoidal obstruction syndrome"
    A condition in which some of the veins in the liver are blocked. This causes a decrease in blood flow inside the liver and may lead to liver damage. Signs and symptoms include weight gain, yellowing of the skin and whites of the eyes, dark-colored urine, and increased liver size. It may occur at some point in time after radiation therapy to the liver and bile ducts or after high-dose anticancer drugs were given before a stem cell transplant. Also called hepatic veno-occlusive disease.
  siplizumab: (sip-LIH-zoo-mab)
    Pronunciation of dictionary term "siplizumab"
    A substance being studied in the treatment of certain types of T-cell lymphoma. It is also being studied in the prevention of organ or tissue rejection after a kidney and/or bone marrow transplant. Siplizumab binds to a protein called CD2, which is found on some types of immune cells and cancer cells. This may help suppress the body’s immune response and it may help kill cancer cells. Siplizumab is a type of monoclonal antibody. Also called MEDI-507.
  Sipple syndrome: (SIH-pul SIN-drome)
    Pronunciation of dictionary term "Sipple syndrome"
    A rare, genetic disorder that affects the endocrine glands and causes a type of thyroid cancer called medullary thyroid cancer, pheochromocytoma, and parathyroid gland cancer. It may also cause benign (noncancerous) tumors in the parathyroid glands and adrenal glands. The affected endocrine glands may make high levels of hormones, which can lead to other medical problems such as high blood pressure and kidney stones. An itchy skin condition may also occur. Sipple syndrome is caused by a mutation (change) in a gene called RET. Also called MEN2A, MEN2A syndrome, multiple endocrine adenomatosis type 2A, and multiple endocrine neoplasia type 2A syndrome.
    More Information
    - Multiple endocrine neoplasia type 2A (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/4881/multiple-endocrine-neoplasia-type-2a)
    - Multiple endocrine neoplasia (MedlinePlus) (https://medlineplus.gov/genetics/condition/multiple-endocrine-neoplasia/)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
  sipuleucel-T: (SY-puh-LOO-sel...)
    Pronunciation of dictionary term "sipuleucel-T"
    A vaccine used to treat prostate cancer that has spread to other parts of the body. It is used in patients who have few or no symptoms and whose cancer is castration resistant (has not responded to treatments that lower testosterone levels). Sipuleucel-T is made from a patient’s immune cells that have been treated in the laboratory with GM-CSF (a type of growth factor) and a protein found on prostate cancer cells. Sipuleucel-T may help the immune system kill prostate cancer cells. It is a type of autologous cellular immunotherapy and a type of dendritic cell vaccine. Also called APC 8015 and Provenge.
    More Information
    - Sipuleucel-T (https://www.cancer.gov/about-cancer/treatment/drugs/sipuleucel-T)
  sirolimus: (sih-ROH-lih-mus)
    Pronunciation of dictionary term "sirolimus"
    A drug used to keep the body from rejecting organ and bone marrow transplants. Sirolimus blocks certain white blood cells that can reject foreign tissues and organs. It also blocks a protein that is involved in cell division. It is a type of antibiotic, a type of immunosuppressant, and a type of serine/threonine kinase inhibitor. Sirolimus was previously called rapamycin. Also called Rapamune.
  sirolimus protein-bound particles: (sih-ROH-lih-mus PROH-teen-bownd PAR-tih-kulz)
    Pronunciation of dictionary term "sirolimus protein-bound particles"
    A form of the drug sirolimus that is used to treat adults with malignant perivascular epithelioid cell tumor that has spread or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Sirolimus protein-bound particles may have fewer side effects and work better than other forms of sirolimus. It binds to a protein called mTOR, which may help keep tumor cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Sirolimus protein-bound particles is a type of kinase inhibitor, a type of angiogenesis inhibitor, and a type of immunosuppressant. Also called Fyarro.
    More Information
    - Sirolimus Protein-Bound Particles (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles)
  SIRS: A serious condition in which there is inflammation throughout the whole body. SIRS may be caused by an infection, trauma, surgery, ischemia (lack of blood supply to a part of the body), or certain conditions, such as an autoimmune disorder or pancreatitis. To be diagnosed with SIRS, a person must have two or more of the following: low or high body temperature, increased heart rate, increased breathing rate, and an abnormal white blood cell count. When SIRS occurs as a result of a known infection, it may be called sepsis. Sepsis can be severe or life threatening and lead to multiple organ failure and shock. Also called systemic inflammatory response syndrome.
  SJG-136: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called DNA cross-linking agents.
  Sjögren syndrome: (SHOH-grin SIN-drome)
    Pronunciation of dictionary term "Sjögren syndrome"
    An autoimmune disease that affects the tear glands and salivary glands, and may affect glands in the stomach, pancreas, and intestines. The disease causes dry eyes and mouth, and may cause dryness in the nose, throat, air passages, skin, and vagina. It may also cause inflammation in the joints, muscles, and skin; pneumonia; tingling in the fingers and toes; and fatigue. It often occurs with rheumatoid arthritis or other connective tissue diseases.
  SK&F106615: A substance being studied in the treatment of certain multiple myelomas and other advanced cancers. SK&F106615 may block the growth of tumors and may prevent the growth of new blood vessels that tumors need to grow. SK&F106615 is a type of signal transduction inhibitor and a type of antiangiogenesis agent. Also called atiprimod and azaspirane.
  skeletal: (SKEH-leh-tul)
    Pronunciation of dictionary term "skeletal"
    Having to do with the skeleton (bones of the body).
    More Information
    - Cancers by Body Location/System: Musculoskeletal (https://www.cancer.gov/types/by-body-location)
    The human skeleton. The skeleton is the framework of bones and cartilage that supports and protects the soft tissues and the internal organs of the body.
    Drawing of a skeleton of a young girl.
  skeleton: (SKEH-leh-tun)
    Pronunciation of dictionary term "skeleton"
    The framework that supports the soft tissues of vertebrate animals and protects many of their internal organs. The skeletons of vertebrates are made of bone and/or cartilage.
    More Information
    - Cancers by Body Location/System: Musculoskeletal (https://www.cancer.gov/types/by-body-location)
    The human skeleton. The skeleton is the framework of bones and cartilage that supports and protects the soft tissues and the internal organs of the body.
    Drawing of a skeleton of a young girl.
  skin cancer: (skin KAN-ser)
    Pronunciation of dictionary term "skin cancer"
    Cancer that forms in the tissues of the skin. There are several types of skin cancer. Skin cancer that forms in melanocytes (skin cells that make pigment) is called melanoma. Skin cancer that forms in the lower part of the epidermis (the outer layer of the skin) is called basal cell carcinoma. Skin cancer that forms in squamous cells (flat cells that form the surface of the skin) is called squamous cell carcinoma. Skin cancer that forms in neuroendocrine cells (cells that release hormones in response to signals from the nervous system) is called neuroendocrine carcinoma of the skin. Most skin cancers form in older people on parts of the body exposed to the sun or in people who have weakened immune systems.
    More Information
    - Skin Cancer (Including Melanoma) (https://www.cancer.gov/types/skin)
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  skin conduction: (... kun-DUK-shun)
    Pronunciation of dictionary term "skin conduction"
    A change in the heat and electricity passed through the skin by nerves and sweat. Skin conduction increases in certain emotional states and during hot flashes that happen with menopause. Also called electrodermal response and galvanic skin response.
  skin graft: (skin graft)
    Pronunciation of dictionary term "skin graft"
    Skin that is moved from one part of the body to another.
  skin patch: (skin pach)
    Pronunciation of dictionary term "skin patch"
    A bandage-like patch that releases medicine into the body through the skin. The medicine enters the blood slowly and steadily.
  skin stimulation: (skin STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "skin stimulation"
    The process of applying pressure, friction, temperature change, or chemical substances to the skin to lessen or block a feeling of pain.
  skin tag: (skin tag)
    Pronunciation of dictionary term "skin tag"
    A common benign (not cancer) skin growth that appears as a small, raised, brown or skin-colored bump that may have a short, narrow stalk. Skin tags usually occur in areas where the skin folds, such as the neck, armpit, inner thigh, and eyelid. They are usually painless and do not grow or change but may become painful if rubbed or scratched. They most often occur in older adults and in people who are overweight or have diabetes. Also called acrochordon.
  skin test: (skin test)
    Pronunciation of dictionary term "skin test"
    A test for an immune response to a compound by placing it on or under the skin.
  skin vesicle: (… VEH-sih-kul)
    Pronunciation of dictionary term "skin vesicle"
    A fluid-filled sac in the outer layer of skin. It can be caused by rubbing, heat, or diseases of the skin. Also called blister.
  skinning vulvectomy: (SKIH-ning vul-VEK-toh-mee)
    Pronunciation of dictionary term "skinning vulvectomy"
    Surgery to remove the top layer of skin of the vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina). A skin graft may be used to replace the skin that was removed.
  skull: (skul)
    Pronunciation of dictionary term "skull"
    The bones that form the head. The skull is made up of cranial bones (bones that surround and protect the brain) and facial bones (bones that form the eye sockets, nose, cheeks, jaw, and other parts of the face). An opening at the base of the skull is where the spinal cord connects to the brain. Also called cranium.
  SL-11047: A substance that is being studied in the treatment of lymphoma. It belongs to the family of drugs called polyamine analogs.
  SLC24A5 gene: (... jeen)
    Pronunciation of dictionary term "SLC24A5 gene"
    A gene that makes a protein involved in giving color to the skin, hair, and eyes. Mutations (changes) in the SLC24A5 gene have been found in an inherited condition called oculocutaneous albinism. People with this condition have very pale skin and light-colored hair and eyes. They also have a high risk of developing skin cancer at an early age.
  SLC45A2 gene: (... jeen)
    Pronunciation of dictionary term "SLC45A2 gene"
    A gene that makes a protein involved in making melanin (a pigment that gives color to the skin, hair, and eyes). Mutations (changes) in the SLC45A2 gene have been found in an inherited condition called oculocutaneous albinism. People with this condition have very pale skin and light-colored hair and eyes. They also have a high risk of developing skin cancer at an early age.
    More Information
    - SLC45A2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/slc45a2/)
  SLE: A chronic, inflammatory, connective tissue disease that can affect many organs including the joints, skin, heart, lungs, kidneys, and nervous system. It is marked by many different symptoms; however, not everyone with SLE has all of the symptoms. Also called lupus and systemic lupus erythematosus.
  sleep apnea: (… AP-nee-uh)
    Pronunciation of dictionary term "sleep apnea"
    A sleep disorder that is marked by pauses in breathing of 10 seconds or more during sleep, and causes unrestful sleep. Symptoms include loud or abnormal snoring, daytime sleepiness, irritability, and depression.
    More Information
    - Sleep Problems in People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-disorders)
    - Sleep Disorders
  sleep disorder: (sleep dis-OR-der)
    Pronunciation of dictionary term "sleep disorder"
    A disturbance of normal sleep patterns. There are a number of sleep disorders that range from trouble falling asleep, to nightmares, sleepwalking, and sleep apnea (problems with breathing that cause loud snoring). Poor sleep may also be caused by diseases such as heart disease, lung disease, or nerve disorders.
    More Information
    - Sleep Disorders
  sleep stage: (sleep stayj)
    Pronunciation of dictionary term "sleep stage"
    One of four stages of the sleep cycle based on the type of brain activity that occurs during the stage. Stages one, two, and three occur during non-rapid eye movement (non-REM) sleep, which is when a person first falls asleep and then moves from a light sleep into a deep sleep. Stage four occurs during REM sleep, which is when the eyes move rapidly while closed and when most dreams occur. During normal sleep, a person goes through four to five sleep cycles that last about 90 minutes each and include both non-REM sleep and REM sleep.
  sleeve lobectomy: (...loh-BEK-toh-mee)
    Pronunciation of dictionary term "sleeve lobectomy"
    Surgery to remove a lung tumor in a lobe of the lung and a part of the main bronchus (airway). The ends of the bronchus are rejoined and any remaining lobes are reattached to the bronchus. This surgery is done to save part of the lung. Also called sleeve resection.
  sleeve resection: (...ree-SEK-shun)
    Pronunciation of dictionary term "sleeve resection"
    Surgery to remove a lung tumor in a lobe of the lung and a part of the main bronchus (airway). The ends of the bronchus are rejoined and any remaining lobes are reattached to the bronchus. This surgery is done to save part of the lung. Also called sleeve lobectomy.
  slippery elm: (SLIH-puh-ree elm)
    Pronunciation of dictionary term "slippery elm"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called gray elm, Indian elm, red elm, sweet elm, Ulmus fulva, and Ulmus rubra.
  slit-lamp biomicroscopy: (… BY-oh-my-KROS-koh-pee)
    Pronunciation of dictionary term "slit-lamp biomicroscopy"
    An eye exam using an instrument that combines a low-power microscope with a light source that makes a narrow beam of light. The instrument may be used to examine the retina, optic nerve, and other parts of the eye. Also called slit-lamp eye exam.
  slit-lamp eye exam: (... I eg-ZAM)
    Pronunciation of dictionary term "slit-lamp eye exam"
    An eye exam using an instrument that combines a low-power microscope with a light source that makes a narrow beam of light. The instrument may be used to examine the retina, optic nerve, and other parts of the eye. Also called slit-lamp biomicroscopy.
  SLL: An indolent (slow-growing) type of lymphoma in which too many immature lymphocytes (white blood cells) are found mostly in the lymph nodes. This causes the lymph nodes to become larger than normal. Sometimes cancer cells are found in the blood and bone marrow, and the disease is called chronic lymphocytic leukemia. The disease is most often seen in people older than 50 years. SLL is a type of non-Hodgkin Lymphoma. Also called small lymphocytic lymphoma and well-differentiated lymphocytic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  SM-AHN: A rare condition in which too many mast cells (a type of white blood cell) build up in certain tissues and organs in the body, including the bone marrow, lymph nodes, bone, liver, spleen, and small intestine, and may damage them. In SM-AHN, this mast cell buildup occurs together with another blood disorder, usually a myelodysplastic syndrome, myeloproliferative disorder, or acute myeloid leukemia (AML). SM-AHN usually occurs in adults. Also called systemic mastocytosis with associated hematologic neoplasm.
  small cell carcinoma: (... sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "small cell carcinoma"
    A fast-growing type of cancer that usually occurs in the lungs but may also occur in many other parts of the body, such as the cervix, ovary, bladder, prostate, liver, pancreas, and stomach. These cancer cells usually look like small, oval-shaped oats when viewed under a microscope. Small cell carcinoma tends to spread quickly to other parts of the body and usually has a poor prognosis (chance of recovery). Also called oat cell cancer.
  small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "small cell lung cancer"
    An aggressive (fast-growing) cancer that forms in tissues of the lung and can spread to other parts of the body. The cancer cells look small and oval-shaped when looked at under a microscope.
    More Information
    - Lung Cancer (https://www.cancer.gov/types/lung)
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  small intestine: (... in-TES-tin)
    Pronunciation of dictionary term "small intestine"
    A long tube-like organ that connects the stomach and the large intestine. It is about 20 feet long and folds many times to fit inside the abdomen. The small intestine has three parts: the duodenum, jejunum, and ileum. It helps to further digest food coming from the stomach. It absorbs nutrients (vitamins, minerals, carbohydrates, fats, proteins) and water from food so they can be used by the body. The small intestine is part of the digestive system.
    More Information
    - Small Intestine Cancer (https://www.cancer.gov/types/small-intestine)
    The small intestine is a long tube-like organ that connects the stomach to the large intestine. The small intestine includes the duodenum, jejunum, and ileum.
    Drawing of the small intestine showing the duodenum, jejunum, and ileum. Also shown are the stomach, appendix, large intestine, and rectum.
  small intestine cancer: (... in-TES-tin KAN-ser)
    Pronunciation of dictionary term "small intestine cancer"
    A rare cancer that forms in tissues of the small intestine (a long tube-like organ that connects the stomach to the large intestine). The most common type of small intestine cancer is adenocarcinoma (cancer that begins in cells that make and release mucus and other fluids). Other types of small intestine cancer include leiomyosarcoma (cancer that begins in the smooth muscle cells of the small intestine), gastrointestinal (GI) neuroendocrine tumor (a slow-growing type of cancer that begins in the lining of the GI tract), GI stromal tumor (a type of tumor that usually begins in cells in the wall of the GI tract), and lymphoma (cancer that begins in immune system cells).
    More Information
    - Small Intestine Cancer (https://www.cancer.gov/types/small-intestine)
    The small intestine is a long tube-like organ that connects the stomach to the large intestine. The small intestine includes the duodenum, jejunum, and ileum.
    Drawing of the small intestine showing the duodenum, jejunum, and ileum. Also shown are the stomach, appendix, large intestine, and rectum.
  small lymphocytic lymphoma: (... LIM-foh-SIH-tik lim-FOH-muh)
    Pronunciation of dictionary term "small lymphocytic lymphoma"
    An indolent (slow-growing) type of lymphoma in which too many immature lymphocytes (white blood cells) are found mostly in the lymph nodes. This causes the lymph nodes to become larger than normal. Sometimes cancer cells are found in the blood and bone marrow, and the disease is called chronic lymphocytic leukemia. The disease is most often seen in people older than 50 years. Small lymphocytic lymphoma is a type of non-Hodgkin Lymphoma. Also called SLL and well-differentiated lymphocytic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  small-molecule drug: (… MAH-leh-kyool ...)
    Pronunciation of dictionary term "small-molecule drug"
    A drug that can enter cells easily because it has a low molecular weight. Once inside the cells, it can affect other molecules, such as proteins, and may cause cancer cells to die. This is different from drugs that have a large molecular weight, which keeps them from getting inside cells easily. Many targeted therapies are small-molecule drugs.
    More Information
    - Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
  smokeless tobacco: (SMOKE-les tuh-BA-koh)
    Pronunciation of dictionary term "smokeless tobacco"
    A type of tobacco that is not smoked or burned. It may be used as chewing tobacco or moist snuff, or inhaled through the nose as dry snuff. Smokeless tobacco contains nicotine and many harmful, cancer-causing chemicals. Using it can lead to nicotine addiction and can cause cancers of the mouth, esophagus, and pancreas. It may also cause heart disease, gum disease, and other health problems.
    More Information
    - Smokeless Tobacco and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/smokeless-fact-sheet)
  smoking cessation: (SMOH-king seh-SAY-shun)
    Pronunciation of dictionary term "smoking cessation"
    To quit smoking. Smoking cessation lowers the risk of cancer and other serious health problems. Counseling, behavior therapy, medicines, and nicotine-containing products, such as nicotine patches, gum, lozenges, inhalers, and nasal sprays, may be used to help a person quit smoking.
    More Information
    - Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco)
  smoldering myeloma: (SMOLE-der-ing MY-eh-LOH-muh)
    Pronunciation of dictionary term "smoldering myeloma"
    A very slow-growing type of myeloma in which abnormal plasma cells (a type of white blood cell) make too much of a single type of monoclonal antibody (a protein). This protein builds up in the blood or is passed in the urine. Patients with smoldering myeloma usually have no symptoms, but need to be checked often for signs of progression to fully developed multiple myeloma.
  SN-38 liposome: (... LY-poh-some)
    Pronunciation of dictionary term "SN-38 liposome"
    A form of the anticancer drug irinotecan that is contained in very tiny, fat-like particles. It may have fewer side effects and work better than irinotecan alone. SN-38 liposome is being studied in the treatment of advanced colorectal cancer and other types of cancer. SN-38 liposome blocks the ability of cells to divide and grow. It may stop the growth of tumor cells. It is a type of topoisomerase inhibitor and a type of irinotecan (CPT-11) derivative. Also called liposomal SN-38.
  SNDX-275: A substance being studied in the treatment of several types of cancer. It blocks enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase (HDAC) inhibitor. Also called entinostat and HDAC inhibitor SNDX-275.
  SnET2: An anticancer drug that is also used in cancer prevention. It belongs to the family of drugs called photosensitizing agents. Also called tin ethyl etiopurpurin.
  SNP: (snip)
    Pronunciation of dictionary term "SNP"
    The most common type of change in DNA (molecules inside cells that carry genetic information). SNPs occur when a single nucleotide (building block of DNA) is replaced with another. These changes may cause disease, and may affect how a person reacts to bacteria, viruses, drugs, and other substances. Also called single nucleotide polymorphism.
    More Information
    - Single Nucleotide Polymorphisms (SNPs) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Single-Nucleotide-Polymorphisms)
  SNRI: A type of drug that is used to treat depression and some other conditions. SNRIs stop or delay substances called serotonin and norepinephrine from being reabsorbed in the brain, which leaves more of them available for the brain to use. Raising serotonin and norepinephrine levels can help regulate mood and relieve depression and chronic pain. SNRIs include drugs such as duloxetine and venlafaxine. Also called serotonin-norepinephrine reuptake inhibitor.
  snuff tobacco: (… tuh-BA-koh)
    Pronunciation of dictionary term "snuff tobacco"
    A type of smokeless tobacco that is made of finely ground or shredded tobacco leaves. It may have different scents and flavors and may be moist or dry. Moist snuff tobacco is placed in the mouth, usually between the cheek and gum or behind the upper or lower lip. Dry snuff tobacco is inhaled through the nose. Snuff tobacco contains nicotine and many harmful, cancer-causing chemicals. Using it can lead to nicotine addiction and can cause cancers of the mouth, esophagus, and pancreas. Snuff tobacco use may also cause gum disease, heart disease, stroke, and other health problems. Using snuff tobacco is also called “dipping.”
    More Information
    - Smokeless Tobacco and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/smokeless-fact-sheet)
  SNX 111: A drug used in the treatment of chronic pain. Also called Prialt and ziconotide.
  SNX-5422: A substance being studied in the treatment of cancer. SNX-5422 blocks a protein needed for cells to grow and may kill cancer cells. It is a type of heat shock protein 90 inhibitor.
  SNX-5422 mesylate: (…MEH-zih-layt)
    Pronunciation of dictionary term "SNX-5422 mesylate"
    A substance being studied in the treatment of cancer. SNX-5422 mesylate blocks a protein needed for cells to grow and may kill cancer cells. It is a type of heat shock protein 90 inhibitor.
  soblidotin: (soh-blih-DOH-tin)
    Pronunciation of dictionary term "soblidotin"
    A substance being studied in the treatment of cancer. It is a type of tubulin inhibitor. Also called TZT-1027.
  social determinants of health: (SOH-shul deh-TER-mih-nunts … helth)
    Pronunciation of dictionary term "social determinants of health"
    The social, economic, and physical conditions in the places where people are born and where they live, learn, work, play, and get older that can affect their health, well-being, and quality of life. Social determinants of health include factors such as education level, income, employment, housing, transportation, and access to healthy food, clean air and water, and health care services. Social determinants of health have an important effect on health outcomes, especially in certain groups of people. For example, people who cannot afford healthy food or who do not live in a safe area for exercise are more likely to have a poor diet, be physically inactive, and have obesity. This can increase their risk of developing certain diseases, such as cancer. Also called SDOH.
    More Information
    - Cancer Disparities (https://www.cancer.gov/about-cancer/understanding/disparities)
  social service: (SOH-shul SER-vis)
    Pronunciation of dictionary term "social service"
    A community resource that helps people in need. Services may include help getting to and from medical appointments, home delivery of medication and meals, in-home nursing care, help paying medical costs not covered by insurance, loaning medical equipment, and housekeeping help.
  social support: (SOH-shul suh-PORT)
    Pronunciation of dictionary term "social support"
    A network of family, friends, neighbors, and community members that is available in times of need to give psychological, physical, and financial help.
  social worker: (SOH-shul WUR-ker)
    Pronunciation of dictionary term "social worker"
    A professional trained to talk with people and their families about emotional or physical needs, and to find them support services.
  socioeconomic status: (SOH-see-oh-EH-kuh-NAH-mik STA-tus)
    Pronunciation of dictionary term "socioeconomic status"
    A way of describing people based on their education, income, and type of job. Socioeconomic status is usually described as low, medium, and high. People with a lower socioeconomic status usually have less access to financial, educational, social, and health resources than those with a higher socioeconomic status. As a result, they are more likely to be in poor health and have chronic health conditions and disabilities. Also called SES.
  SOD1 inhibitor ATN-224: (... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "SOD1 inhibitor ATN-224"
    A substance being studied in the treatment of cancer. It may prevent the growth of new blood vessels that tumors need to grow. SOD1 inhibitor ATN-224 also blocks enzymes that cells need to divide and grow, and it may kill cancer cells. It is a type of antiangiogenesis agent and a type of superoxide dismutase inhibitor. Also called ATN-224.
  sodium: (SOH-dee-um)
    Pronunciation of dictionary term "sodium"
    A mineral needed by the body to keep body fluids in balance. Sodium is found in table salt and in many processed foods. Too much sodium can cause the body to retain water.
  sodium borocaptate: (SOH-dee-um BORE-oh-KAP-tayt)
    Pronunciation of dictionary term "sodium borocaptate"
    A substance used in a type of radiation therapy called boron neutron capture therapy. Sodium borocaptate is injected into a vein and becomes concentrated in tumor cells. The patient then receives radiation treatment with atomic particles called neutrons. The neutrons react with the boron in sodium borocaptate and make radioactive particles that kill the tumor cells without harming normal cells. Also called BSH.
  sodium ferric gluconate: (SOH-dee-um FAYR-ik GLOO-koh-nayt)
    Pronunciation of dictionary term "sodium ferric gluconate"
    A form of the mineral iron that is used to treat anemia caused by low amounts of iron in the blood. Anemia is a condition in which the number of red blood cells is below normal. Sodium ferric gluconate is a type of hematinic and a dietary supplement. Also called Ferrlecit.
  sodium salicylate: (SOH-dee-um suh-LIH-sih-LAYT)
    Pronunciation of dictionary term "sodium salicylate"
    A drug that is a type of nonsteroidal anti-inflammatory drug. Sodium salicylate may be tolerated by people who are sensitive to aspirin.
  sodium stibogluconate: (SOH-dee-um stih-boh-GLOO-koh-nayt)
    Pronunciation of dictionary term "sodium stibogluconate"
    A substance being studied in the treatment of certain solid tumors, lymphoma, and myeloma. Sodium stibogluconate may block enzymes needed for cancer growth. It is a type of pentavalent antimonial. Also called SSG.
  sodium sulfite: (SOH-dee-um SUL-fite)
    Pronunciation of dictionary term "sodium sulfite"
    A chemical used in photography, paper making, water treatment, and for other purposes.
  sodium thiosulfate anhydrous: (SOH-dee-um THY-oh-SUL-fayt an-HY-drus)
    Pronunciation of dictionary term "sodium thiosulfate anhydrous"
    A drug used to reduce the risk of hearing loss in children aged 1 month and older who are receiving cisplatin (a type of anticancer drug) for solid tumors that have not spread to other parts of the body. It is also being studied in the prevention and treatment of other conditions. Sodium thiosulfate anhydrous is a type of chemoprotective agent. Also called Pedmark.
  soft diet: (soft DY-et)
    Pronunciation of dictionary term "soft diet"
    A diet consisting of bland foods that are softened by cooking, mashing, pureeing, or blending.
  soft palate: (... PAL-et)
    Pronunciation of dictionary term "soft palate"
    The back, muscular (not bony) part of the roof of the mouth.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  soft tissue: (... TIH-shoo)
    Pronunciation of dictionary term "soft tissue"
    Refers to muscle, fat, fibrous tissue, blood vessels, or other supporting tissue of the body.
    More Information
    - Soft Tissue Sarcoma (https://www.cancer.gov/types/soft-tissue-sarcoma)
  soft tissue sarcoma: (…TIH-shoo sar-KOH-muh)
    Pronunciation of dictionary term "soft tissue sarcoma"
    A cancer that begins in the muscle, fat, fibrous tissue, blood vessels, or other supporting tissue of the body.
    More Information
    - Soft Tissue Sarcoma (https://www.cancer.gov/types/soft-tissue-sarcoma)
    Soft tissue sarcoma forms in the soft tissues of the body, including the muscles, tendons, ligaments, cartilage, fat, blood vessels, lymph vessels, nerves, and tissues around joints.
    Soft tissue sarcoma; drawing shows different types of tissue in the body where soft tissue sarcomas form, including the lymph vessels, blood vessels, fat, muscles, tendons, ligaments, cartilage, and nerves.
  solar keratosis: (SOH-ler KAYR-uh-TOH-sis)
    Pronunciation of dictionary term "solar keratosis"
    A thick, scaly patch of skin that may become cancer. It usually forms on areas exposed to the sun, such as the face, scalp, back of the hands, or chest. It is most common in people with fair skin. Also called actinic keratosis and senile keratosis.
  solid tumor: (SAH-lid TOO-mer)
    Pronunciation of dictionary term "solid tumor"
    An abnormal mass of tissue that usually does not contain cysts or liquid areas. Solid tumors may be benign (not cancer), or malignant (cancer). Different types of solid tumors are named for the type of cells that form them. Examples of solid tumors are sarcomas, carcinomas, and lymphomas. Leukemias (cancers of the blood) generally do not form solid tumors.
  Soliris: (soh-LAYR-is)
    Pronunciation of dictionary term "Soliris"
    A drug used to prevent red blood cells from being destroyed in patients with a rare red blood cell disorder called paroxysmal nocturnal hemoglobinuria (PNH). It is also used to treat another rare disorder called atypical hemolytic urea syndrome (aHUS), in which blood clots form in small blood vessels. Soliris binds to an immune system protein called C5. This helps keep red blood cells from breaking down and helps keep blood clots from forming. Soliris is a type of monoclonal antibody. Also called eculizumab.
  Soltamox: (SOL-tah-mox)
    Pronunciation of dictionary term "Soltamox"
    A drug used to treat certain types of breast cancer in women and men, to prevent invasive breast cancer in women who have had ductal carcinoma in situ (abnormal cells in the ducts of the breast), and to prevent breast cancer in women who are at a high risk of developing the disease. It is also being studied in the treatment of other types of cancer. Soltamox blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. It is a type of selective estrogen receptor modulator (SERM). Also called tamoxifen citrate.
    More Information
    - Tamoxifen Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/tamoxifencitrate)
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  soluble: (SOL-yoo-bul)
    Pronunciation of dictionary term "soluble"
    Able to be dissolved in a liquid.
  solvent: (SOL-vent)
    Pronunciation of dictionary term "solvent"
    A liquid that is able to dissolve a solid.
  somatic: (soh-MA-tik)
    Pronunciation of dictionary term "somatic"
    Having to do with the body.
  somatic cell: (soh-MA-tik ...)
    Pronunciation of dictionary term "somatic cell"
    Any of the body cells except the reproductive (germ) cells.
  somatic mutation: (soh-MA-tik myoo-TAY-shun)
    Pronunciation of dictionary term "somatic mutation"
    An alteration in DNA that occurs after conception. Somatic mutations can occur in any of the cells of the body except the germ cells (sperm and egg) and therefore are not passed on to children. These alterations can (but do not always) cause cancer or other diseases. Also called somatic variant.
  somatic testing: (soh-MA-tik TES-ting)
    Pronunciation of dictionary term "somatic testing"
    A laboratory method that looks for genetic changes in cells or tissues of the body that have occurred during a person’s lifetime and were not inherited from a parent. Somatic testing is done on a tumor or blood sample to look for certain genetic changes in the tumor’s DNA. This may help doctors learn more about the cancer, plan treatment, predict how well the cancer will respond to treatment, or make a prognosis. Somatic testing may sometimes be called tumor testing or biomarker testing.
  somatic variant: (soh-MA-tik VAYR-ee-unt)
    Pronunciation of dictionary term "somatic variant"
    An alteration in DNA that occurs after conception. Somatic variants can occur in any of the cells of the body except the germ cells (sperm and egg) and therefore are not passed on to children. These alterations can (but do not always) cause cancer or other diseases. Also called somatic mutation.
  somatomedin: (SOH-muh-toh-MEE-din)
    Pronunciation of dictionary term "somatomedin"
    A protein made by the body that stimulates the growth of many types of cells. Somatomedin is similar to insulin (a hormone made in the pancreas). There are two forms of somatomedin called IGF-1 and IGF-2. Higher than normal levels of IGF-1 may increase the risk of several types of cancer. Somatomedin is a type of growth factor and a type of cytokine. Also called IGF and insulin-like growth factor.
  somatostatin receptor: (soh-MA-toh-STA-tin reh-SEP-ter)
    Pronunciation of dictionary term "somatostatin receptor"
    A protein on the surface of cells that binds to a hormone called somatostatin, which helps control other hormones in the body. Somatostatin receptors are found on many different types of cells, and they may also be found in higher than normal amounts on some types of cancer cells. Knowing the amount of somatostatin receptor in tumor tissue may help diagnose cancer and plan treatment.
  somatostatin receptor scintigraphy: (soh-MA-toh-STA-tin reh-SEP-ter sin-TIH-gruh-fee)
    Pronunciation of dictionary term "somatostatin receptor scintigraphy"
    A type of radionuclide scan used to find carcinoid and other types of tumors. Radioactive octreotide, a drug similar to somatostatin, is injected into a vein and travels through the bloodstream. The radioactive octreotide attaches to tumor cells that have receptors for somatostatin. A radiation-measuring device detects the radioactive octreotide, and makes pictures showing where the tumor cells are in the body. Also called octreotide scan and SRS.
  somatotropin: (soh-MA-toh-TROH-pin)
    Pronunciation of dictionary term "somatotropin"
    A protein made by the pituitary gland that helps control body growth and the use of glucose and fat in the body. Also called growth hormone.
  Somatuline Depot: (soh-MA-too-leen DEE-poh)
    Pronunciation of dictionary term "Somatuline Depot"
    A drug that is similar to somatostatin (a hormone made by the body) and is used to treat certain types of gastroenteropancreatic neuroendocrine tumors, carcinoid syndrome, and acromegaly (a condition in which the pituitary gland makes too much growth hormone). Somatuline Depot may help stop the body from making extra amounts of certain hormones, including growth hormone, insulin, glucagon, and hormones that affect digestion. It may also help keep certain types of tumor cells from growing. Somatuline Depot is a type of somatostatin analog. Also called lanreotide acetate.
    More Information
    - Lanreotide Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/lanreotideacetate)
  somnolence syndrome: (SOM-noh-lens SIN-drome)
    Pronunciation of dictionary term "somnolence syndrome"
    Periods of drowsiness, lethargy, loss of appetite, and irritability in children following radiation therapy treatments to the head.
  sonidegib phosphate: (soh-NIH-deh-gib FOS-fayt)
    Pronunciation of dictionary term "sonidegib phosphate"
    A drug used to treat locally advanced basal cell carcinoma (BCC) that has come back after surgery or radiation therapy. It is also used in patients who cannot be treated with surgery or radiation therapy. Sonidegib phosphate is also being studied in the treatment of other types of cancer. Sonidegib phosphate blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of hedgehog signaling pathway antagonist. Also called erismodegib, LDE225, and Odomzo.
    More Information
    - Sonidegib (https://www.cancer.gov/about-cancer/treatment/drugs/sonidegib)
  sonogram: (SAH-noh-gram)
    Pronunciation of dictionary term "sonogram"
    A computer picture of areas inside the body created by high-energy sound waves. The sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of the body tissues on a computer screen. A sonogram may be used to help diagnose disease, such as cancer. It may also be used during pregnancy to check the fetus (unborn baby) and during medical procedures, such as biopsies. Also called ultrasonogram.
  SOP: Written instructions for doing a specific task in a certain way. In clinical trials, SOPs are set up to store records, collect data, screen and enroll subjects, and submit Institutional Review Board (IRB) applications and renewals. Also called Standard Operating Procedure.
  sorafenib tosylate: (sor-A-feh-nib TOH-suh-layt)
    Pronunciation of dictionary term "sorafenib tosylate"
    A drug used to treat certain types of hepatocellular carcinoma (a type of liver cancer), renal cell carcinoma (a type of kidney cancer), and thyroid cancer. It is also being studied in the treatment of other types of cancer. Sorafenib tosylate blocks certain proteins, which may help keep cancer cells from growing and dividing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Sorafenib tosylate is a type of kinase inhibitor and a type of antiangiogenesis agent. Also called BAY 43-9006 and Nexavar.
    More Information
    - Sorafenib Tosylate (https://www.cancer.gov/about-cancer/treatment/drugs/sorafenibtosylate)
  sorivudine: (sor-IH-vyoo-deen)
    Pronunciation of dictionary term "sorivudine"
    An antiviral drug that is being studied as a treatment for herpesvirus. It belongs to the family of drugs called nucleic acid synthesis inhibitors.
  sorrel: (SOR-ul)
    Pronunciation of dictionary term "sorrel"
    A plant that has been used in some cultures to treat certain medical problems. It may have anticancer effects. The scientific name is Rumex acetosella. Also called dock and sheep sorrel.
  sotorasib: (SOH-toh-RA-sib)
    Pronunciation of dictionary term "sotorasib"
    A drug used alone to treat adults with non-small cell lung cancer that has spread or cannot be removed by surgery, and with panitumumab to treat colorectal cancer that has spread. It is used in patients who have a certain mutation (change) in the KRAS gene and whose cancer was treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Sotorasib blocks a protein (KRAS p.G12C) made by the mutated KRAS gene, which may help keep cancer cells from growing and may kill them. It is a type of targeted therapy. Also called Lumakras.
    More Information
    - Sotorasib (https://www.cancer.gov/about-cancer/treatment/drugs/sotorasib)
  soy: (soy)
    Pronunciation of dictionary term "soy"
    A product from a plant of Asian origin that produces beans used in many food products. Soy contains isoflavones (estrogen-like substances) that are being studied for the prevention of cancer, hot flashes that occur with menopause, and osteoporosis (loss of bone density). Soy in the diet may lower cholesterol levels and reduce the risk of heart disease. Also called Glycine max, soya, and soybean.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  soya: (SOY-uh)
    Pronunciation of dictionary term "soya"
    A product from a plant of Asian origin that produces beans used in many food products. Soya contains isoflavones (estrogen-like substances) that are being studied for the prevention of cancer, hot flashes that occur with menopause, and osteoporosis (loss of bone density). Soya in the diet may lower cholesterol levels and reduce the risk of heart disease. Also called Glycine max, soy, and soybean.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  soybean: (SOY-been)
    Pronunciation of dictionary term "soybean"
    A product from a plant of Asian origin that produces beans used in many food products. Soybean contains isoflavones (estrogen-like substances) that are being studied for the prevention of cancer, hot flashes that occur with menopause, and osteoporosis (loss of bone density). Soybean in the diet may lower cholesterol levels and reduce the risk of heart disease. Also called Glycine max, soy, and soya.
    More Information
    - Prostate Cancer, Nutrition, and Dietary Supplements
  spasm: (SPA-zum)
    Pronunciation of dictionary term "spasm"
    A sudden contraction of a muscle or group of muscles, such as a cramp.
  spastic colon: (SPAS-tik KOH-lun)
    Pronunciation of dictionary term "spastic colon"
    A disorder of the intestines commonly marked by abdominal pain, bloating, and changes in a person’s bowel habits. This may include diarrhea or constipation, or both, with one occurring after the other. Also called IBS, irritable bowel syndrome, irritable colon, and mucus colitis.
  specialist: (SPEH-shuh-list)
    Pronunciation of dictionary term "specialist"
    In medicine, a doctor or other health care professional who is trained and licensed in a special area of practice. Examples of medical specialists include oncologists (cancer specialists) and hematologists (blood specialists).
  specific immune cell: (speh-SIH-fik ih-MYOON sel)
    Pronunciation of dictionary term "specific immune cell"
    An immune cell such as a T or B lymphocyte that responds to a single, specific antigen.
  specificity: (SPEH-sih-FIH-sih-tee)
    Pronunciation of dictionary term "specificity"
    When referring to a medical test, specificity refers to the percentage of people who test negative for a specific disease among a group of people who do not have the disease. No test is 100% specific because some people who do not have the disease will test positive for it (false positive).
  SPECT: A special type of computed tomography (CT) scan in which a small amount of a radioactive drug is injected into a vein and a scanner is used to make detailed images of areas inside the body where the radioactive material is taken up by the cells. SPECT can give information about blood flow to tissues and chemical reactions (metabolism) in the body. Also called single-photon emission computed tomography.
  spectroscopy: (spek-TROS-koh-pee)
    Pronunciation of dictionary term "spectroscopy"
    The study of the amount of light that is taken up, given off, or scattered (reflected) by an object. Spectroscopy breaks down light and measures different wavelengths of visible and non-visible light. In medicine, different types of spectroscopy are being used to study tissues and to help make a diagnosis.
  speculum: (SPEK-yoo-lum)
    Pronunciation of dictionary term "speculum"
    An instrument used to widen an opening of the body to make it easier to look inside.
  speech pathologist: (... puh-THAH-loh-jist)
    Pronunciation of dictionary term "speech pathologist"
    A specialist who evaluates and treats people with communication and swallowing problems. Also called speech therapist.
  speech therapist: (speech THAYR-uh-pist)
    Pronunciation of dictionary term "speech therapist"
    A specialist who evaluates and treats people with communication and swallowing problems. Also called speech pathologist.
  sperm: (spurm)
    Pronunciation of dictionary term "sperm"
    The male reproductive cell, formed in the testicle. A sperm unites with an egg to form an embryo.
  sperm aspiration: (… AS-pih-RAY-shun)
    Pronunciation of dictionary term "sperm aspiration"
    A procedure in which a sample of sperm cells is removed from the testicle or epididymis through a small needle attached to a syringe. The sperm is looked at under a microscope in the laboratory, where it may be used right away to fertilize eggs or frozen for future infertility treatment. Sperm aspiration may be useful for men who have fertility problems caused by a blockage that keeps sperm from being ejaculated. It may also be useful for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Sperm aspiration is a type of sperm retrieval method.
  sperm banking: (spurm...)
    Pronunciation of dictionary term "sperm banking"
    The process of freezing sperm and storing it for future use. Samples of semen are collected and checked under a microscope in the laboratory to count sperm cells and find out how healthy they are. The sperm cells are then frozen and stored. Sperm banking is often used for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Sperm banking is a type of fertility preservation. Also called sperm cryopreservation.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  sperm count: (spurm kownt)
    Pronunciation of dictionary term "sperm count"
    A count of the number of sperm in a sample of semen. A sperm count may be used as a measure of fertility.
  sperm cryopreservation: (… KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "sperm cryopreservation"
    The process of freezing sperm and storing it for future use. Samples of semen are collected and checked under a microscope in the laboratory to count sperm cells and find out how healthy they are. The sperm cells are then frozen and stored. Sperm cryopreservation is often used for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Sperm cryopreservation is a type of fertility preservation. Also called sperm banking.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  sperm retrieval: (spurm reh-TREE-vul)
    Pronunciation of dictionary term "sperm retrieval"
    Removal of sperm from a man's testis or epididymis by a doctor using a fine needle or other instrument.
  spermatic cord: (sper-MA-tik kord)
    Pronunciation of dictionary term "spermatic cord"
    A cord-like structure in the male reproductive system that contains nerves, blood and lymph vessels, and the vas deferens (a coiled tube that carries sperm out of the testicle). It runs from the abdomen to the testicle, and connects to the testicle in the scrotum (external sac). Also called testicular cord.
  spermicide: (SPER-mih-side)
    Pronunciation of dictionary term "spermicide"
    A chemical substance that kills sperm and is used as a type of birth control. It is available over-the-counter (without a doctor’s order) and comes in many different forms such as cream, gel, foam, and suppository. Spermicides can be used alone or with another birth control method such as a condom or diaphragm. They do not protect against sexually transmitted diseases (STDs).
  SPF: A scale for rating the level of sunburn protection in sunscreen products. The higher the SPF, the more sunburn protection it gives. Sunscreens with a value of 2 through 11 give minimal protection against sunburns. Sunscreens with a value of 12 through 29 give moderate protection. SPFs of 30 or higher give high protection against sunburn. Also called sun protection factor.
  sphenoid bone: (SFEE-noyd bone)
    Pronunciation of dictionary term "sphenoid bone"
    A butterfly-shaped bone at the base of the skull, behind the nose. The sphenoid bone helps form the eye socket. It contains two large sinuses, which are hollow spaces lined with cells that make mucus to keep the inside of the nose from drying out.
  sphenoid sinus: (SFEE-noyd SY-nus)
    Pronunciation of dictionary term "sphenoid sinus"
    A type of paranasal sinus (a hollow space in the bones around the nose). There are two large sphenoid sinuses in the sphenoid bone, which is behind the nose between the eyes. The sphenoid sinuses are lined with cells that make mucus to keep the nose from drying out.
    Anatomy of the paranasal sinuses (spaces between the bones around the nose).
    Anatomy of the paranasal sinuses; drawing shows front and side views of the frontal sinus, ethmoid sinus, maxillary sinus, and sphenoid sinus. The nasal cavity and pharynx (throat) are also shown.
  sphincter: (SFINK-ter)
    Pronunciation of dictionary term "sphincter"
    A ring-shaped muscle that relaxes or tightens to open or close a passage or opening in the body. Examples are the anal sphincter (around the opening of the anus) and the pyloric sphincter (at the lower opening of the stomach).
  spiculated mass: (SPIH-kyoo-LAY-ted …)
    Pronunciation of dictionary term "spiculated mass"
    A lump of tissue with spikes or points on the surface.
  spinal anesthesia: (SPY-nul A-nes-THEE-zhuh)
    Pronunciation of dictionary term "spinal anesthesia"
    A temporary loss of feeling in the abdomen and/or the lower part of the body. Special drugs called anesthetics are injected into the fluid in the lower part of the spinal column to cause the loss of feeling. The patient stays awake during the procedure. It is a type of regional anesthesia. Also called SAB, spinal block, and subarachnoid block.
  spinal block: (SPY-nul blok)
    Pronunciation of dictionary term "spinal block"
    A temporary loss of feeling in the abdomen and/or the lower part of the body. Special drugs called anesthetics are injected into the fluid in the lower part of the spinal column to cause the loss of feeling. The patient stays awake during the procedure. It is a type of regional anesthesia. Also called SAB, spinal anesthesia, and subarachnoid block.
  spinal canal: (SPY-nul kuh-NAL)
    Pronunciation of dictionary term "spinal canal"
    The narrow, fluid-filled space in the spinal column (the bones, muscles, tendons, and other tissues that reach from the base of the skull to the tailbone). The spinal cord runs through the spinal canal.
  spinal column: (SPY-nul KAH-lum)
    Pronunciation of dictionary term "spinal column"
    The bones, muscles, tendons, and other tissues that reach from the base of the skull to the tailbone. The spinal column encloses the spinal cord and the fluid surrounding the spinal cord. Also called backbone, spine, and vertebral column.
    Anatomy of the spine. The spine is made up of bones, muscles, tendons, nerves, and other tissues that reach from the base of the skull near the spinal cord (clivus) to the coccyx (tailbone). The vertebrae (back bones) of the spine include the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the tailbone. Each vertebra is separated by a disc. The vertebrae surround and protect the spinal cord. The spinal cord is divided into segments, each containing a pair of spinal nerves that send messages between the brain and the rest of the body. Many spinal nerves extend beyond the conus medullaris (the end of the spinal cord) to form a bundle of nerves called the cauda equina.
    Anatomy of the spine; drawing shows a side view of the spine, including the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the coccyx (tailbone). Also shown are the spinal cord, vertebra (back bone), conus medullaris (the end of the spinal cord), cauda equina (the bundle of spinal nerves that extend beyond the conus medullaris), and a lumbar disc. The clivus (a bone at the base of the skull near the spinal cord) is also shown.
  spinal cord: (SPY-nul kord)
    Pronunciation of dictionary term "spinal cord"
    A column of nerve tissue that runs from the base of the skull down the center of the back. It is covered by three thin layers of protective tissue called membranes. The spinal cord and membranes are surrounded by the vertebrae (back bones). The spinal cord and the brain make up the central nervous system (CNS). Spinal cord nerves carry messages between the brain and the rest of the body.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  spinal cord compression: (SPY-nul kord kum-PREH-shun)
    Pronunciation of dictionary term "spinal cord compression"
    Pressure on the spinal cord that may be caused by a tumor, a spinal fracture, or other conditions. Spinal cord compression may cause pain, weakness, loss of feeling, paralysis, incontinence (inability to control urine or stool), or impotence (inability to have an erection of the penis).
  spinal tap: (SPY-nul ...)
    Pronunciation of dictionary term "spinal tap"
    A procedure in which a thin, hollow needle is inserted into the lower part of the spine to collect a sample of cerebrospinal fluid (CSF). This is done by placing the needle between two bones in the spine and into the subarachnoid space (the fluid-filled space between the thin layers of tissue around the spinal cord). After the CSF sample is removed, it is checked under a microscope for signs of infection, inflammation, or diseases, such as cancer or certain nervous system conditions. A spinal tap may also be done to measure or reduce CSF pressure around the spinal cord and brain, to inject drugs, such as chemotherapy or anesthesia drugs, directly into the CSF, or to inject contrast dye for certain imaging tests. Also called LP and lumbar puncture.
    Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.
    Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.
  spindle cell hemangioma: (SPIN-dul sel hee-MAN-jee-OH-muh)
    Pronunciation of dictionary term "spindle cell hemangioma"
    A benign (not cancer) blood vessel tumor that forms on or under the skin. Spindle cell hemangiomas have cells called spindle cells that look long and slender under a microscope. These tumors are painful red-brown or bluish lesions that usually appear on the arms or legs. One or more lesions may form, and they can sometimes rupture (break open) and bleed. Spindle cell hemangiomas usually occur in young adults but can sometimes occur in children. They are a type of vascular tumor.
  spindle cell sarcoma: (SPIN-dul sel sar-KOH-muh)
    Pronunciation of dictionary term "spindle cell sarcoma"
    A type of sarcoma that contains spindle cells. Under a microscope, spindle cells look long and slender. Sarcomas are cancers that begin in muscle, fat, fibrous tissue, or other connective or supportive tissue in the body. Spindle cell sarcomas usually occur in adults.
  spindle cell tumor: (SPIN-dul sel TOO-mer)
    Pronunciation of dictionary term "spindle cell tumor"
    A type of tumor that contains cells called spindle cells, based on their shape. Under a microscope, spindle cells look long and slender. Spindle cell tumors may be sarcomas or carcinomas.
  spine: (spine)
    Pronunciation of dictionary term "spine"
    The bones, muscles, tendons, and other tissues that reach from the base of the skull to the tailbone. The spine encloses the spinal cord and the fluid surrounding the spinal cord. Also called backbone, spinal column, and vertebral column.
    Anatomy of the spine. The spine is made up of bones, muscles, tendons, nerves, and other tissues that reach from the base of the skull near the spinal cord (clivus) to the coccyx (tailbone). The vertebrae (back bones) of the spine include the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the tailbone. Each vertebra is separated by a disc. The vertebrae surround and protect the spinal cord. The spinal cord is divided into segments, each containing a pair of spinal nerves that send messages between the brain and the rest of the body. Many spinal nerves extend beyond the conus medullaris (the end of the spinal cord) to form a bundle of nerves called the cauda equina.
    Anatomy of the spine; drawing shows a side view of the spine, including the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the coccyx (tailbone). Also shown are the spinal cord, vertebra (back bone), conus medullaris (the end of the spinal cord), cauda equina (the bundle of spinal nerves that extend beyond the conus medullaris), and a lumbar disc. The clivus (a bone at the base of the skull near the spinal cord) is also shown.
  spine cancer: (... KAN-ser)
    Pronunciation of dictionary term "spine cancer"
    Cancer that begins in the spinal column (backbone) or spinal cord. The spinal column is made up of linked bones, called vertebrae. The spinal cord is a column of nerve tissue that runs from the base of the skull down the back. It is surrounded by three protective membranes, and is enclosed within the vertebrae. Many different types of cancer may form in the bones, tissues, fluid, or nerves of the spine.
  spiral CT scan: (SPY-rul … skan)
    Pronunciation of dictionary term "spiral CT scan"
    A procedure that uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The x-ray machine scans the body in a spiral path. This allows more images to be made in a shorter time than with older CT methods. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly on the x-ray. Spiral CT scan also creates more detailed pictures and may be better at finding small abnormal areas inside the body. It may be used to help diagnose disease, plan treatment, or find out how well treatment is working. Also called helical computed tomography.
    More Information
    - Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
  spirituality: (SPEER-ih-choo-A-lih-tee)
    Pronunciation of dictionary term "spirituality"
    Having to do with deep, often religious, feelings and beliefs, including a person’s sense of peace, purpose, connection to others, and beliefs about the meaning of life.
    More Information
    - Spirituality in Cancer Care
  spit tobacco: (… tuh-BA-koh)
    Pronunciation of dictionary term "spit tobacco"
    A type of smokeless tobacco made from cured tobacco leaves. It may be sweetened and flavored with licorice and other substances. It comes in the form of loose tobacco leaves, pellets or “bits” (leaf tobacco rolled into small pellets), plugs (leaf tobacco pressed and held together with some type of sweetener), or twists (leaf tobacco rolled into rope-like strands and twisted). It is placed in the mouth, usually between the cheek and lower lip, and may be chewed. Spit tobacco contains nicotine and many harmful, cancer-causing chemicals. Using it can lead to nicotine addiction and can cause cancers of the mouth, throat, esophagus, and pancreas. Spit tobacco use may also cause gum disease, heart disease, stroke, and other health problems. Also called chewing tobacco.
    More Information
    - Smokeless Tobacco and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/smokeless-fact-sheet)
  spleen: (spleen)
    Pronunciation of dictionary term "spleen"
    An organ that is part of the lymphatic and blood systems. The spleen filters the blood to help destroy microorganisms and get rid of old or damaged red blood cells. It also makes lymphocytes (white blood cells) and stores blood cells. The spleen is located on the upper left side of the abdomen under the ribs and above the stomach.
    The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.
    Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.
  splenectomy: (spleh-NEK-toh-mee)
    Pronunciation of dictionary term "splenectomy"
    An operation to remove the spleen.
  splenic: (SPLEH-nik)
    Pronunciation of dictionary term "splenic"
    Having to do with the spleen (an organ in the abdomen that makes immune cells, filters the blood, stores blood cells, and destroys old blood cells).
  splenomegaly: (SPLEH-noh-MEH-guh-lee)
    Pronunciation of dictionary term "splenomegaly"
    Enlarged spleen.
  spontaneous abortion: (spon-TAY-nee-us uh-BOR-shun)
    Pronunciation of dictionary term "spontaneous abortion"
    An unexpected loss of pregnancy before the 20th week of pregnancy. Most spontaneous abortions happen very early in pregnancy, often before a person even knows they are pregnant. Signs include vaginal spotting or bleeding, pain or cramping in the abdomen or lower back, and the passing of fluid or tissue from the vagina. Spontaneous abortions often occur because of genetic problems in the fetus. Maternal factors or conditions that could contribute to having a spontaneous abortion include problems with the uterus or cervix, infection, hormone problems, severe malnutrition, smoking, drinking alcohol, taking certain medicines, or exposure to radiation. Being older or having certain diseases, such as polycystic ovary syndrome, uncontrolled diabetes, congenital heart disease, thyroid or kidney disease, and immune system disorders, may also put a person at higher risk of having a spontaneous abortion. Also called miscarriage.
  sporadic cancer: (spuh-RA-dik KAN-ser)
    Pronunciation of dictionary term "sporadic cancer"
    Cancer that occurs in people who do not have a family history of that cancer or an inherited change in their DNA that would increase their risk for that cancer.
  spotted thistle: (... THIH-sul)
    Pronunciation of dictionary term "spotted thistle"
    A plant whose leaves, stems, and flowers have been used in some cultures to treat certain medical problems. Spotted thistle may have anti-inflammatory and anticancer effects. The scientific name is Cnicus benedictus. Also called blessed thistle, cardin, holy thistle, and St. Benedict's thistle.
  Sprycel: (SPRY-sel)
    Pronunciation of dictionary term "Sprycel"
    A drug used alone or with other drugs to treat adults and children aged 1 year and older with certain types of chronic myeloid leukemia or acute lymphoblastic leukemia that are Philadelphia chromosome positive. It is also being studied in the treatment of other types of cancer. Sprycel blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called BMS-354825 and dasatinib.
    More Information
    - Dasatinib (https://www.cancer.gov/about-cancer/treatment/drugs/dasatinib)
  sputum: (SPYOO-tum)
    Pronunciation of dictionary term "sputum"
    Mucus and other matter brought up from the lungs by coughing.
  sputum cytology: (SPYOO-tum sy-TAH-loh-jee)
    Pronunciation of dictionary term "sputum cytology"
    Examination under a microscope of cells found in sputum (mucus and other matter brought up from the lungs by coughing). The test checks for abnormal cells, such as lung cancer cells.
  squalamine lactate: (SKWAH-luh-meen LAK-tayt)
    Pronunciation of dictionary term "squalamine lactate"
    A drug that belongs to the family of drugs called angiogenesis inhibitors. It prevents the growth of new blood vessels into a solid tumor.
  squamocolumnar junction: (SKWAY-moh-kuh-LUM-nar JUNK-shun)
    Pronunciation of dictionary term "squamocolumnar junction"
    The area around the opening of the cervix where the endocervix (inner part) and ectocervix (outer part) come together. This area contains both glandular cells (cells that make mucus) from the endocervix and squamous cells (thin, skin-like cells) from the ectocervix. Most abnormal cell changes and most cervical cancers begin in the squamous cells of the squamocolumnar junction. Also called transformation zone.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  squamous cell: (SKWAY-mus sel)
    Pronunciation of dictionary term "squamous cell"
    Flat cell that looks like a fish scale under a microscope. These cells are found in the tissues that form the surface of the skin, the passages of the respiratory and digestive tracts, and the lining of the hollow organs of the body (such as the bladder, kidney, and uterus, including the cervix).
  squamous cell carcinoma: (SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "squamous cell carcinoma"
    Cancer that begins in squamous cells. Squamous cells are thin, flat cells that look like fish scales, and are found in the tissue that forms the surface of the skin, the lining of the hollow organs of the body, and the lining of the respiratory and digestive tracts. Most cancers of the anus, cervix, head and neck, and vagina are squamous cell carcinomas. Also called epidermoid carcinoma.
  squamous cell carcinoma in situ: (SKWAY-mus sel KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "squamous cell carcinoma in situ"
    A condition in which abnormal cells are found in the tissues that form the surface of the skin, the lining of the hollow organs of the body (such as the bladder and uterus), and the lining of the respiratory and digestive tracts. These abnormal cells may become cancer and spread into nearby normal tissue. Squamous cell carcinoma in situ occurs in the skin, anus, bladder, uterus, cervix, head and neck, lung, and vagina, and in other parts of the body. Also called stage 0 squamous cell carcinoma.
  squamous cell carcinoma of the head and neck: (SKWAY-mus sel KAR-sih-NOH-muh …)
    Pronunciation of dictionary term "squamous cell carcinoma of the head and neck"
    Cancer of the head and neck that begins in squamous cells (thin, flat cells that form the surface of the skin, eyes, various internal organs, and the lining of hollow organs and ducts of some glands). Squamous cell carcinoma of the head and neck includes cancers of the nasal cavity, sinuses, lips, mouth, salivary glands, throat, and larynx (voice box). Most head and neck cancers are squamous cell carcinomas.
  squamous cell carcinoma of the skin: (SKWAY-mus sel KAR-sih-NOH-muh … skin)
    Pronunciation of dictionary term "squamous cell carcinoma of the skin"
    Cancer that begins in cells that form the epidermis (outer layer of the skin). It usually occurs on areas of the skin that have been exposed to natural sunlight or artificial sunlight (such as from tanning beds) over long periods of time. These areas include the face, ears, lower lip, neck, arms, or back of the hands. It may also occur on areas of the skin that have been burned or exposed to chemicals or radiation. Squamous cell carcinoma of the skin may appear as a firm red bump, a scaly red patch, an open sore, or a wart that may crust or bleed easily. Squamous cell carcinoma of the skin that has not spread can usually be cured. Also called cutaneous squamous cell carcinoma and squamous cell skin cancer.
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  squamous cell skin cancer: (SKWAY-mus sel skin KAN-ser)
    Pronunciation of dictionary term "squamous cell skin cancer"
    Cancer that begins in cells that form the epidermis (outer layer of the skin). It usually occurs on areas of the skin that have been exposed to natural sunlight or artificial sunlight (such as from tanning beds) over long periods of time. These areas include the face, ears, lower lip, neck, arms, or back of the hands. It may also occur on areas of the skin that have been burned or exposed to chemicals or radiation. Squamous cell skin cancer may appear as a firm red bump, a scaly red patch, an open sore, or a wart that may crust or bleed easily. Squamous cell skin cancer that has not spread can usually be cured. Also called cutaneous squamous cell carcinoma and squamous cell carcinoma of the skin.
    Anatomy of the skin showing the epidermis (including the squamous cell and basal cell layers), dermis, subcutaneous tissue, and other parts of the skin.
    Anatomy of the skin; drawing shows the epidermis (including the squamous cell and basal cell layers), dermis, and subcutaneous tissue. Also shown are the hair shafts, hair follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and sweat glands.
  squamous intraepithelial lesion: (SKWAY-mus IN-truh-eh-pih-THEE-lee-ul LEE-zhun)
    Pronunciation of dictionary term "squamous intraepithelial lesion"
    An abnormal growth of squamous cells that forms on the surface of certain organs, such as the cervix, vagina, vulva, anus, penis, or back of the throat. Squamous cells are thin, flat cells that look like fish scales under a microscope. Squamous intraepithelial lesions may be low grade or high grade, depending on how abnormal the cells look under a microscope and how much of the tissue is affected. They are usually caused by chronic infection with certain types of human papillomavirus (HPV) and are found when a Pap test or biopsy is done. If not treated, some squamous intraepithelial lesions may become cancer and spread into nearby normal tissue. Also called SIL.
  SR-29142: A drug that may protect healthy tissue from the toxic effects of anticancer drugs.
  SR-45023A: An anticancer drug that belongs to the family of drugs called bisphosphonates. It affects cancer cell receptors governing cell growth and cell death.
  SR49059: A substance being studied in the treatment of cancer. It inhibits a hormone growth factor that causes some cancer cells to divide. It is a type of vasopressin receptor antagonist.
  SRS: A type of radionuclide scan used to find carcinoid and other types of tumors. Radioactive octreotide, a drug similar to somatostatin, is injected into a vein and travels through the bloodstream. The radioactive octreotide attaches to tumor cells that have receptors for somatostatin. A radiation-measuring device detects the radioactive octreotide, and makes pictures showing where the tumor cells are in the body. Also called octreotide scan and somatostatin receptor scintigraphy.
  SSG: A substance being studied in the treatment of certain solid tumors, lymphoma, and myeloma. SSG may block enzymes needed for cancer growth. It is a type of pentavalent antimonial. Also called sodium stibogluconate.
  SSRI: A type of drug that is used to treat depression and some other conditions. SSRIs stop or delay the body from reabsorbing a substance called serotonin, which leaves more of it available for the body to use. Raising serotonin levels can help regulate mood, appetite, digestion, sleep, and many other bodily functions. SSRIs include drugs such as citalopram, escitalopram, fluoxetine, paroxetine, and sertraline. Also called selective serotonin reuptake inhibitor.
  St. Benedict's thistle: (saynt BEH-neh-diktz THIH-sul)
    Pronunciation of dictionary term "St. Benedict's thistle"
    A plant whose leaves, stems, and flowers have been used in some cultures to treat certain medical problems. St. Benedict's thistle may have anti-inflammatory and anticancer effects. The scientific name is Cnicus benedictus. Also called blessed thistle, cardin, holy thistle, and spotted thistle.
  St. John's wort: (… wort)
    Pronunciation of dictionary term "St. John's wort"
    An herbal product sold as an over-the-counter treatment for depression. It is being studied for its ability to lessen certain side effects of cancer treatment. Also called Hypericum perforatum.
    More Information
    - Cancer Therapy Interactions With Foods and Dietary Supplements
  ST1481: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called topoisomerase inhibitors. Also called gimatecan.
  stable disease: (STAY-bul dih-ZEEZ)
    Pronunciation of dictionary term "stable disease"
    Cancer that is neither decreasing nor increasing in extent or severity.
  stage: (stayj)
    Pronunciation of dictionary term "stage"
    The extent of a cancer in the body. Staging is usually based on the size of the tumor, whether lymph nodes contain cancer, and whether the cancer has spread from the original site to other parts of the body.
    More Information
    - Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
  stage 0 anal HSIL: (... AY-nul ...)
    Pronunciation of dictionary term "stage 0 anal HSIL"
    Abnormal cells are found in the mucosa (innermost layer) of the anus. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 is also called high-grade squamous intraepithelial lesion (HSIL).
    More Information
    - Anal Cancer Treatment
  stage 0 bladder cancer: (... BLA-der KAN-ser)
    Pronunciation of dictionary term "stage 0 bladder cancer"
    Stage 0 bladder cancer refers to noninvasive bladder cancer. This means that cancer cells are found in tissue lining the inside of the bladder but have not invaded the bladder wall. Stage 0 is divided into stages 0a and 0is, depending on the type of tumor. Stage 0a is also called noninvasive papillary carcinoma, which may look like long, thin growths extending into the bladder lumen (the space where urine collects). Stage 0is is also called carcinoma in situ, which is a flat tumor on the tissue lining the inside of the bladder.
    More Information
    - Bladder Cancer Stages
    Stage 0 bladder cancer (noninvasive bladder cancer). Cancer cells are found in tissue lining the inside of the bladder but have not invaded into the bladder wall. Stage 0a (also called noninvasive papillary carcinoma) may look like long, thin growths extending into the bladder lumen (the space where urine collects). Stage 0is (also called carcinoma in situ) is a flat tumor on the tissue lining the inside of the bladder.
    Stage 0 bladder cancer (noninvasive bladder cancer); drawing shows the bladder, lumen (the space where urine collects), ureter, prostate, and urethra. The first inset shows stage 0a (also called noninvasive papillary carcinoma) on the inner lining of the bladder. The second inset shows stage 0is (also called carcinoma in situ) on the inner lining of the bladder. Also shown are the connective tissue and muscle layers of the bladder and the layer of fat around the bladder.
  stage 0 breast carcinoma in situ: (... brest KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 breast carcinoma in situ"
    A condition in which abnormal cells are found in the tissues of the breast. There are 2 types of stage 0 breast carcinoma in situ: ductal carcinoma in situ (DCIS) and Paget disease of the nipple. DCIS is a condition in which the abnormal cells are found in the lining of a breast duct. The abnormal cells have not spread outside the duct to other tissues in the breast. Paget disease of the nipple is a condition in which abnormal cells are found in the skin cells of the nipple and may spread to the areola. Patients with Paget disease of the nipple may also have DCIS or invasive breast cancer in the same breast. Also called breast carcinoma in situ.
    More Information
    - Breast Cancer Treatment
  stage 0 cervical carcinoma in situ: (... SER-vih-kul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 cervical carcinoma in situ"
    Severely abnormal cells are found on the surface of the cervix. Stage 0 cervical carcinoma in situ is usually caused by certain types of human papillomavirus (HPV) and is found when a cervical biopsy is done. If not treated, these abnormal cells may become cancer and spread to nearby normal tissue. Treatment for stage 0 cervical carcinoma in situ may include cryotherapy, laser therapy, loop electrosurgical procedure (LEEP), or cone biopsy to remove or destroy the abnormal tissue. Stage 0 cervical carcinoma in situ is sometimes called high-grade or severe dysplasia. Also called cervical squamous intraepithelial neoplasia 3 and CIN 3.
    More Information
    - Cervical Cancer Treatment
  stage 0 chronic lymphocytic leukemia: (... KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "stage 0 chronic lymphocytic leukemia"
    There are too many lymphocytes in the blood, but there are no other symptoms of leukemia. Stage 0 is indolent (slow-growing).
    More Information
    - Chronic Lymphocytic Leukemia Treatment
  stage 0 colorectal carcinoma in situ: (...KOH-loh-REK-tul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 colorectal carcinoma in situ"
    Abnormal cells are found in the mucosa (innermost layer) of the colon and/or rectal wall. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage 0 colorectal carcinoma in situ. Abnormal cells are found in the mucosa (innermost layer) of the colon/rectum wall. These abnormal cells may become cancer and spread into nearby normal tissue.
    Stage 0 colorectal carcinoma in situ; drawing shows a cross-section of the colon/rectum. An inset shows the layers of the colon/rectum wall with abnormal cells in the mucosa layer. Also shown are the submucosa, muscle layers, serosa, a blood vessel, and lymph nodes.
  stage 0 disease: (stayj … dih-ZEEZ)
    Pronunciation of dictionary term "stage 0 disease"
    A condition in which abnormal cells that look like cancer cells under a microscope are found only in the place where they first formed and haven’t spread to nearby tissue. At some point, these cells may become cancerous and spread into nearby normal tissue. There are many different types of stage 0 disease depending on the type of tissue in which it began. These include adenocarcinoma in situ (of the cervix, lungs, and gastrointestinal tract), ductal carcinoma in situ (of the breast), and squamous cell carcinoma in situ (of the skin, mouth, and larynx). Also called carcinoma in situ.
    Carcinoma in situ (CIS) is a group of abnormal cells that are found only in the place where they first formed in the body (see left panel). These abnormal cells may become cancer and spread to nearby normal tissue (see right panel).
    Two-panel drawing showing layers of tissue, including the outer tissue layer, muscle layers, connective tissue, and inner tissue layer. The left panel shows carcinoma in situ (abnormal cells) in the inner tissue layer. The right panel shows cancer cells spreading from the inner tissue layer to the connective tissue and muscle layers.
  stage 0 distal bile duct cancer (carcinoma in situ): (... DIS-tul bile dukt KAN-ser (KAR-sih-NOH-muh in SY-too))
    Pronunciation of dictionary term "stage 0 distal bile duct cancer (carcinoma in situ)"
    Abnormal cells are found in the innermost layer of tissue lining the distal bile duct. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue. Stage 0 is also called high-grade dysplasia.
    More Information
    - Bile Duct Cancer Stages
  stage 0 esophageal carcinoma in situ: (... ee-SAH-fuh-JEE-ul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 esophageal carcinoma in situ"
    Cancer has formed in the inner lining of the esophagus wall. Stage 0 is also called high-grade dysplasia.
    More Information
    - Esophageal Cancer Treatment
    Stage 0 adenocarcinoma of the esophagus. Cancer has formed in the inner lining of the esophagus wall.
    Stage 0 adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the inner lining of the esophagus wall. Also shown are the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
    Stage 0 squamous cell carcinoma of the esophagus. Cancer has formed in the inner lining of the esophagus wall.
    Stage 0 squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the inner lining of the esophagus wall. Also shown are the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
  stage 0 gallbladder carcinoma in situ: (... GAWL-bla-der KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 gallbladder carcinoma in situ"
    Abnormal cells are found in the mucosa (innermost layer) of the gallbladder wall. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Gallbladder Cancer Treatment
  stage 0 gastric cancer (carcinoma in situ): (... GAS-trik KAN-ser (KAR-sih-NOH-muh in SY-too))
    Pronunciation of dictionary term "stage 0 gastric cancer (carcinoma in situ)"
    Abnormal cells are found in the mucosa (innermost layer) of the stomach wall. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue. Also called stage 0 stomach cancer (carcinoma in situ).
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage 0 HPV-negative oropharyngeal carcinoma in situ: (... NEH-guh-tiv OR-oh-fuh-RIN-jee-ul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 HPV-negative oropharyngeal carcinoma in situ"
    Abnormal cells are found in the lining of the oropharynx (throat). These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Oropharyngeal Cancer Treatment
  stage 0 hypopharyngeal carcinoma in situ: (... HY-poh-fuh-RIN-jee-ul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 hypopharyngeal carcinoma in situ"
    Abnormal cells are found in the lining of the hypopharynx. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Hypopharyngeal Cancer Treatment
  stage 0 intrahepatic bile duct cancer (carcinoma in situ): (... IN-truh-heh-PA-tik bile dukt KAN-ser (KAR-sih-NOH-muh in SY-too))
    Pronunciation of dictionary term "stage 0 intrahepatic bile duct cancer (carcinoma in situ)"
    Abnormal cells are found in the innermost layer of tissue lining the intrahepatic bile duct. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue.
    More Information
    - Bile Duct Cancer Stages
  stage 0 laryngeal carcinoma in situ: (... luh-RIN-jee-ul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 laryngeal carcinoma in situ"
    Abnormal cells are found in the lining of the larynx. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Laryngeal Cancer Treatment
  stage 0 lip and oral cavity carcinoma in situ: (... OR-ul KA-vih-tee KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 lip and oral cavity carcinoma in situ"
    Abnormal cells are found in the lining of the lips and oral cavity. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage 0 maxillary sinus carcinoma in situ: (... MAK-sih-LAYR-ee SY-nus KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 maxillary sinus carcinoma in situ"
    Abnormal cells are found in the mucous membranes lining the maxillary sinus. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage 0 medullary thyroid carcinoma in situ: (... MED-yoo-LAYR-ee THY-royd KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 medullary thyroid carcinoma in situ"
    No tumor is found in the thyroid but abnormal cells are found by screening tests. These abnormal cells may become cancer and spread into nearby normal tissue.
  stage 0 melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage 0 melanoma"
    Abnormal melanocytes (cells that make melanin, the pigment that gives skin its natural color) are found in the epidermis (outer layer of the skin). These abnormal melanocytes may become cancer and spread into nearby normal tissue. Also called melanoma in situ.
    More Information
    - Melanoma Treatment
    Stage 0 melanoma. Abnormal melanocytes are found in the epidermis (outer layer of the skin). These abnormal melanocytes may become cancer and spread into nearby normal tissue.
    Stage 0 melanoma; drawing shows an abnormal area on the surface of the skin and abnormal melanocytes in the epidermis (outer layer of the skin). Also shown are the dermis (inner layer of the skin) and the subcutaneous tissue below the dermis.
  stage 0 Merkel cell carcinoma in situ: (stayj … MER-kul sel KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 Merkel cell carcinoma in situ"
    Abnormal Merkel cells are found in the top layer of the skin. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Merkel Cell Carcinoma Treatment
  stage 0 nasal cavity and ethmoid sinus carcinoma in situ: (... NAY-zul KA-vih-tee … ETH-moyd SY-nus KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 nasal cavity and ethmoid sinus carcinoma in situ"
    Abnormal cells are found in the mucous membranes lining the nasal cavity or ethmoid sinus. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage 0 nasopharyngeal carcinoma in situ: (...NAY-zoh-fuh-RIN-jee-ul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 nasopharyngeal carcinoma in situ"
    Abnormal cells are found in the lining of the nasopharynx. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Nasopharyngeal Cancer Treatment
  stage 0 non-small cell lung carcinoma in situ: (... sel lung KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 non-small cell lung carcinoma in situ"
    Abnormal cells are found in the lining of the airways. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 non-small cell lung carcinoma in situ may be adenocarcinoma in situ (AIS) or squamous cell carcinoma in situ (SCIS).
    More Information
    - Non-Small Cell Lung Cancer Treatment
  stage 0 nonmelanoma skin carcinoma in situ on the eyelid: (... non-MEH-luh-NOH-muh skin KAR-sih-NOH-muh in SY-too ... I-lid)
    Pronunciation of dictionary term "stage 0 nonmelanoma skin carcinoma in situ on the eyelid"
    Abnormal cells are found in the epidermis, usually in the basal cell layer. These abnormal cells may become cancer and spread into nearby normal tissue. Also called nonmelanoma skin carcinoma in situ on the eyelid.
    More Information
    - Skin Cancer Treatment
  stage 0 nonmelanoma skin carcinoma in situ on the head and neck (not on the eyelid): (... non-MEH-luh-NOH-muh skin KAR-sih-NOH-muh in SY-too ...)
    Pronunciation of dictionary term "stage 0 nonmelanoma skin carcinoma in situ on the head and neck (not on the eyelid)"
    Abnormal cells are found in the squamous cell or basal cell layer of the epidermis. These abnormal cells may become cancer and spread into nearby normal tissue. Also called nonmelanoma skin carcinoma in situ on the head and neck (not on the eyelid).
    More Information
    - Skin Cancer Treatment
    Nonmelanoma skin cancer of the head and neck (carcinoma in situ). Abnormal cells are found in the squamous cell or basal cell layer of the epidermis. These abnormal cells may become cancer and spread into nearby normal tissue.
    Nonmelanoma skin cancer of the head and neck (carcinoma in situ); drawing shows abnormal squamous cells and basal cells in the epidermis. Also shown are the dermis and the subcutaneous tissue below the dermis. There are two insets: the inset on the left shows a close up of normal and abnormal squamous cells; the inset on the right shows a close up of normal and abnormal basal cells.
  stage 0 oropharyngeal carcinoma in situ: (... OR-oh-fuh-RIN-jee-ul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 oropharyngeal carcinoma in situ"
    Abnormal cells are found in the lining of the oropharynx. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Oropharyngeal Cancer Treatment (Adult)
  stage 0 pancreatic carcinoma in situ: (...PAN-kree-A-tik KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 pancreatic carcinoma in situ"
    Abnormal cells are found in the lining of the pancreas. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Pancreatic Cancer Treatment
    Stage 0 pancreatic cancer. Abnormal cells are found in the lining of the pancreas. These abnormal cells may become cancer and spread into nearby normal tissue.
    Stage 0 pancreatic cancer; drawing shows abnormal cells in the pancreas.
  stage 0 penile carcinoma in situ: (... PEE-nile KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 penile carcinoma in situ"
    Stage 0 is divided into stages 0is and 0a. In stage 0is, abnormal cells are found on the surface of the skin of the penis. These abnormal cells form growths that may become cancer and spread into nearby normal tissue. Stage 0is is also called penile intraepithelial neoplasia. In stage 0a, squamous cell cancer that does not spread is found on the surface of the skin of the penis or on the underneath surface of the foreskin of the penis. Stage 0a is also called noninvasive localized squamous cell carcinoma.
    More Information
    - Penile Cancer Treatment
  stage 0 perihilar bile duct cancer (carcinoma in situ): (... PAYR-ee-HY-ler bile dukt KAN-ser (KAR-sih-NOH-muh in SY-too))
    Pronunciation of dictionary term "stage 0 perihilar bile duct cancer (carcinoma in situ)"
    Abnormal cells are found in the innermost layer of tissue lining the perihilar bile duct. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue. Stage 0 is also called high-grade dysplasia.
    More Information
    - Bile Duct Cancer Stages
  stage 0 salivary gland carcinoma in situ: (... SA-lih-VAYR-ee gland KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 salivary gland carcinoma in situ"
    Abnormal cells are found in the lining of the salivary ducts or the small sacs that make up the salivary gland. These abnormal cells may become cancer and spread into nearby normal tissue.
    More Information
    - Salivary Gland Cancer Treatment
  stage 0 squamous cell carcinoma: (… SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage 0 squamous cell carcinoma"
    A condition in which abnormal cells are found in the tissues that form the surface of the skin, the lining of the hollow organs of the body (such as the bladder and uterus), and the lining of the respiratory and digestive tracts. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 squamous cell carcinoma occurs in the skin, anus, bladder, uterus, cervix, head and neck, lung, and vagina, and in other parts of the body. Also called squamous cell carcinoma in situ.
  stage 0 stomach cancer (carcinoma in situ): (... STUH-muk KAN-ser (KAR-sih-NOH-muh in SY-too))
    Pronunciation of dictionary term "stage 0 stomach cancer (carcinoma in situ)"
    Abnormal cells are found in the mucosa (innermost layer) of the stomach wall. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue. Also called stage 0 gastric cancer (carcinoma in situ).
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage 0 testicular carcinoma in situ: (...tes-TIH-kyoo-ler KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 testicular carcinoma in situ"
    Abnormal cells are found in the tiny tubules where the sperm cells begin to develop. These abnormal cells may become cancer and spread into nearby normal tissue. All tumor marker levels are normal. Also called testicular intraepithelial neoplasia and testicular intratubular germ cell neoplasia.
    More Information
    - Testicular Cancer Treatment
  stage 0 transitional cell carcinoma in situ of the renal pelvis and ureter: (... tran-ZIH-shuh-nul sel KAR-sih-NOH-muh in SY-too ... REE-nul PEL-vus ... YER-eh-ter)
    Pronunciation of dictionary term "stage 0 transitional cell carcinoma in situ of the renal pelvis and ureter"
    Abnormal cells are found in tissue lining the inside of the renal pelvis or ureter. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 is divided into stages 0a and 0is, depending on the type of tumor. Stage 0a is also called noninvasive papillary carcinoma, which may look like long, thin growths that grow out from the tissue lining the inside of the renal pelvis or ureter. Stage 0is is also called carcinoma in situ, which is a flat tumor on the tissue lining the inside of the renal pelvis or ureter.
    More Information
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
  stage 0 urethral carcinoma in situ: (... yoo-REE-thrul KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "stage 0 urethral carcinoma in situ"
    Abnormal cells are found on the inside lining of the urethra. These abnormal cells may become cancer and spread into nearby normal tissue.
  stage 1 neuroblastoma: (... NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage 1 neuroblastoma"
    Cancer is in only one area and all of the cancer that can be seen is completely removed during surgery.
    More Information
    - Neuroblastoma Treatment
  stage 2 neuroblastoma: (... NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage 2 neuroblastoma"
    Stage 2 neuroblastoma is divided into stages 2A and 2B. In stage 2A, the cancer is in only one area and all of the cancer that can be seen is not completely removed during surgery. In stage 2B, the cancer is in only one area and all of the cancer that can be seen may or may not be completely removed during surgery. Cancer cells are found in the lymph nodes near the tumor.
    More Information
    - Neuroblastoma Treatment
  stage 3 neuroblastoma: (... NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage 3 neuroblastoma"
    In stage 3 neuroblastoma, one of the following is true: the cancer (1) cannot be completely removed during surgery and has spread from one side of the body to the other side and may also have spread to nearby lymph nodes; or (2) is on one side of the body and has spread to lymph nodes on the other side of the body; or (3) is in the middle of the body and has spread to tissues or lymph nodes on both sides of the body, and the cancer cannot be removed by surgery.
    More Information
    - Neuroblastoma Treatment
  stage 4 neuroblastoma: (... NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage 4 neuroblastoma"
    Stage 4 neuroblastoma is divided into stages 4 and 4S. In stage 4, the cancer has spread to distant lymph nodes or to other parts of the body. In stage 4S, the child is younger than 12 months, and (1) the cancer has spread to the skin, liver, and/or bone marrow; or (2) the cancer is in only one area and all of the cancer that can be seen may or may not be completely removed during surgery; or (3) cancer cells may be found in the lymph nodes near the tumor.
    More Information
    - Neuroblastoma Treatment
  stage A esthesioneuroblastoma: (… es-THEE-zee-oh-NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage A esthesioneuroblastoma"
    Cancer is found in the nasal cavity only.
    More Information
    - Childhood Esthesioneuroblastoma
  stage A prostate cancer: (… PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage A prostate cancer"
    A prostate cancer stage defined by the Jewett staging system. Stage A prostate cancer is cancer that began in the prostate and is found in the prostate only. It is usually found during surgery for other reasons, such as benign prostatic hyperplasia (a condition in which an overgrowth of prostate tissue occurs). Stage A is divided into stages A1 and A2. In stage A1, the cancer cells do not look very different from normal cells. In stage A2, the cancer cells look more abnormal or are in several areas in the prostate.
  stage B esthesioneuroblastoma: (… es-THEE-zee-oh-NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage B esthesioneuroblastoma"
    Cancer has spread from the nasal cavity to the nasal sinuses.
    More Information
    - Childhood Esthesioneuroblastoma
  stage B prostate cancer: (… PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage B prostate cancer"
    A prostate cancer stage defined by the Jewett staging system. Stage B prostate cancer is cancer that began in the prostate and is more advanced than stage A, but has not spread outside the prostate. Stage B is divided into stages B0, B1, and B2. In stage B0, the cancer is detected only by increased blood levels of PSA (prostate-specific antigen). In stage B1, cancer is in one area of one lobe of the prostate. In stage B2, there is more cancer in one or both lobes of the prostate.
  stage C esthesioneuroblastoma: (… es-THEE-zee-oh-NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage C esthesioneuroblastoma"
    Cancer has spread through the nasal sinuses to nearby tissue.
    More Information
    - Childhood Esthesioneuroblastoma
  stage C prostate cancer: (… PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage C prostate cancer"
    A prostate cancer stage defined by the Jewett staging system. Stage C prostate cancer is cancer that began in the prostate, has grown beyond the outer layer of the prostate to nearby tissues, and may be found in the seminal vesicles (glands that help produce semen). Stage C is divided into stages C1 and C2. In stage C1, the cancer has grown outside the prostate but has not spread to lymph nodes or other places in the body. In stage C2, the cancer has grown outside the prostate and blocks urine flow from the bladder or through the ureters.
    As prostate cancer progresses from Stage I to Stage IV, the cancer cells grow within the prostate, through the outer layer of the prostate into nearby tissue, and then to lymph nodes or other parts of the body.
    Prostate cancer staging; six panel drawing showing a side view of normal male anatomy and closeup views of Stage I, Stage IIA, Stage IIB, Stage III, and Stage IV showing cancer growing from within the prostate to nearby tissue and then to lymph nodes or other parts of the body.
  stage D esthesioneuroblastoma: (… es-THEE-zee-oh-NOOR-oh-blas-TOH-muh)
    Pronunciation of dictionary term "stage D esthesioneuroblastoma"
    Cancer has spread to distant parts of the body, such as the lymph nodes in the neck, or to the brain, bone, liver, or lung.
    More Information
    - Childhood Esthesioneuroblastoma
  stage D prostate cancer: (… PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage D prostate cancer"
    A prostate cancer stage defined by the Jewett staging system. Stage D prostate cancer is cancer that began in the prostate and has spread to lymph nodes near or far from the prostate, or to other parts of the body, often to the bones. Stage D is divided into stages D0, D1, D2, and D3. In stage D0, the level of prostatic acid phosphatase (PAP) is high. In stage D1, the cancer has spread to local lymph nodes only. In stage D2, the cancer has spread to distant lymph nodes and to bones or internal organs. In stage D3, prostate cancer has come back in patients who had received hormone therapy.
  stage I adenosarcoma of the uterus: (... A-deh-noh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage I adenosarcoma of the uterus"
    The tumor is found in the uterus only. Stage I is divided into stages IA, IB, and IC. In stage IA, the tumor is found in the endometrium or endocervix (the inner part of the cervix that forms a canal connecting the vagina to the uterus). In stage IB, the tumor has spread halfway or less into the myometrium (the muscular outer layer of the uterus). In stage IC, the tumor has spread more than halfway into the myometrium.
    More Information
    - Uterine Sarcoma Treatment
  stage I adrenocortical cancer: (... uh-DREE-noh-KOR-tih-kul KAN-ser)
    Pronunciation of dictionary term "stage I adrenocortical cancer"
    The tumor is 5 centimeters or smaller and is found in the adrenal gland only.
    More Information
    - Adrenocortical Carcinoma Treatment
  stage I adult Hodgkin lymphoma: (... uh-dult HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage I adult Hodgkin lymphoma"
    Stage I is divided into stages I and IE. In stage I, cancer is found in one of the following places in the lymph system: (1) one or more lymph nodes in a group of lymph nodes; (2) Waldeyer’s ring; (3) thymus; or (4) spleen. In stage IE, cancer is found in one area outside the lymph system.
    More Information
    - Hodgkin Lymphoma Treatment
    Stage I adult lymphoma. Cancer is found in one or more lymph nodes in a group of lymph nodes or, in rare cases, cancer is found in the Waldeyer’s ring, thymus, or spleen. In stage IE (not shown), cancer has spread to one area outside the lymph system.
    Stage I adult lymphoma; drawing shows cancer in one lymph node group and in the spleen. Also shown are the Waldeyer’s ring and the thymus. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
  stage I adult non-Hodgkin lymphoma: (... uh-dult non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage I adult non-Hodgkin lymphoma"
    Stage I is divided into stages I and IE. In stage I, cancer is found in one of the following places in the lymph system: (1) one or more lymph nodes in a group of lymph nodes; (2) Waldeyer’s ring; (3) thymus; or (4) spleen. In stage IE, cancer is found in one area outside the lymph system.
    More Information
    - Non-Hodgkin Lymphoma Treatment
    Stage I adult lymphoma. Cancer is found in one or more lymph nodes in a group of lymph nodes or, in rare cases, cancer is found in the Waldeyer’s ring, thymus, or spleen. In stage IE (not shown), cancer has spread to one area outside the lymph system.
    Stage I adult lymphoma; drawing shows cancer in one lymph node group and in the spleen. Also shown are the Waldeyer’s ring and the thymus. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
  stage I adult primary liver cancer: (... uh-DULT PRY-mayr-ee LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage I adult primary liver cancer"
    There is one tumor and it has not spread to nearby blood vessels.
  stage I adult soft tissue sarcoma of the retroperitoneum: (… uh-DULT ... TIH-shoo sar-KOH-muh ... REH-troh-PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "stage I adult soft tissue sarcoma of the retroperitoneum"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is 5 centimeters or smaller and is low grade or the grade is unknown. Low-grade cancer cells look more like normal cells under a microscope and grow and spread more slowly than mid-grade and high-grade cancer cells. In stage IB, the tumor is larger than 5 centimeters and is low grade or the grade is unknown.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage I adult soft tissue sarcoma of the trunk, arms, and legs: (... uh-DULT ... TIH-shoo sar-KOH-muh ...)
    Pronunciation of dictionary term "stage I soft tissue sarcoma of the trunk, arms, and legs"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is 5 centimeters or smaller and is low grade or the grade is unknown. Low-grade cancer cells look more like normal cells under a microscope and grow and spread more slowly than mid-grade and high-grade cancer cells. In stage IB, the tumor is larger than 5 centimeters and is low grade or the grade is unknown.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage I AIDS-related lymphoma: (... ree-LAY-ted lim-FOH-muh)
    Pronunciation of dictionary term "stage I AIDS-related lymphoma"
    Stage I is divided into stages I and IE. In stage I, cancer is found in one of the following places in the lymph system: (1) one or more lymph nodes in a group of lymph nodes; (2) Waldeyer’s ring; (3) thymus; or (4) spleen. In stage IE, cancer is found in one area outside the lymph system.
    More Information
    - AIDS-Related Lymphoma Treatment
    Stage I adult lymphoma. Cancer is found in one or more lymph nodes in a group of lymph nodes or, in rare cases, cancer is found in the Waldeyer’s ring, thymus, or spleen. In stage IE (not shown), cancer has spread to one area outside the lymph system.
    Stage I adult lymphoma; drawing shows cancer in one lymph node group and in the spleen. Also shown are the Waldeyer’s ring and the thymus. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
  stage I anal cancer: (... AY-nul KAN-ser)
    Pronunciation of dictionary term "stage I anal cancer"
    The tumor is 2 centimeters or smaller.
    More Information
    - Anal Cancer Treatment
  stage I bladder cancer: (... BLA-der KAN-ser)
    Pronunciation of dictionary term "stage I bladder cancer"
    Cancer has spread into the connective tissue but has not reached the muscle layers of the bladder. Stage I bladder cancer may also be described as non-muscle-invasive bladder cancer.
    More Information
    - Bladder Cancer Stages
    Stage I bladder cancer (non-muscle-invasive bladder cancer). Cancer has spread into the connective tissue but has not reached the muscle layers of the bladder.
    Stage I bladder cancer (non-muscle-invasive bladder cancer); drawing shows the bladder, ureter, prostate, and urethra. An inset shows cancer in the inner lining of the bladder and in the layer of connective tissue next to it. Also shown are the muscle layers of the bladder and the layer of fat around the bladder.
  stage I breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage I breast cancer"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is 2 centimeters or smaller. Cancer has not spread outside the breast. In stage IB, small clusters of breast cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes and either: (1) no tumor is found in the breast; or (2) the tumor is 2 centimeters or smaller.
    More Information
    - Breast Cancer Treatment
    Stage I breast cancer. In stage IA, the tumor is 2 centimeters or smaller and has not spread outside the breast. In stage IB, no tumor is found in the breast or the tumor is 2 centimeters or smaller. Small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes.
    Stage I breast cancer. Drawing shows stage IA on the left; the tumor is 2 cm or smaller and has not spread outside the breast. Drawings in the middle and on the right show stage IB. In the drawing in the middle, no tumor is found in the breast, but small clusters of cancer cells are found in the lymph nodes. In the drawing on the right, the tumor is 2 cm or smaller and small clusters of cancer cells are found in the lymph nodes.
  stage I cancer of the uterus: (... KAN-ser ... YOO-ter-us)
    Pronunciation of dictionary term "stage I cancer of the uterus"
    Cancer found in only the main part of the uterus, not the cervix.
  stage I cervical cancer: (... SER-vih-kul KAN-ser)
    Pronunciation of dictionary term "stage I cervical cancer"
    Cancer is found in the cervix only. Stage I is divided into stages IA and IB, based on the size of the tumor and the deepest point of tumor invasion. Stage IA is divided into stages IA1 and IA2, based on the deepest point of tumor invasion. In stage IA1, a very small amount of cancer that can only be seen with a microscope is found in the tissues of the cervix. The deepest point of tumor invasion is 3 millimeters or less. In stage IA2, a very small amount of cancer that can only be seen with a microscope is found in the tissues of the cervix. The deepest point of tumor invasion is more than 3 millimeters but not more than 5 millimeters. Stage IB is divided into stages IB1, IB2, and IB3, based on the size of the tumor and the deepest point of tumor invasion. In stage IB1, the tumor is 2 centimeters or smaller and the deepest point of tumor invasion is more than 5 millimeters. In stage IB2, the tumor is larger than 2 centimeters but not larger than 4 centimeters. In stage IB3, the tumor is larger than 4 centimeters.
    More Information
    - Cervical Cancer Stages
    Stage IA1 and IA2 cervical cancer. A very small amount of cancer that can only be seen under a microscope is found in the tissues of the cervix. In stage IA1, the cancer is not more than 3 millimeters deep. In stage IA2, the cancer is more than 3 but not more than 5 millimeters deep.
    Stage IA1 and IA2 cervical cancer; drawing shows a cross-section of the cervix and vagina. An inset shows cancer cells in the cervix that can only be seen under a microscope. The cancer in stage IA1 is not more than 3 mm deep. The cancer in stage IA2 is more than 3 but not more than 5 mm deep.
    Stage IB1 cervical cancer. The cancer is 2 centimeters or smaller and is more than 5 millimeters deep.
    Stage IB1 cervical cancer; drawing shows a cross-section of the cervix and vagina and cancer in the cervix that is smaller than 2 cm. An inset shows cancer that is more than 5 mm deep. Also shown is a 2-cm scale that shows 10 mm is equal to 1 cm.
    Stage IB2 and IB3 cervical cancer. In stage IB2, the cancer is larger than 2 centimeters but not larger than 4 centimeters. In stage IB3, the cancer is larger than 4 centimeters.
    Stage IB2 and IB3 cervical cancer; drawing shows two cross-sections of the cervix and vagina. The drawing on the left shows stage IB2 cancer in the cervix that is larger than 2 cm but not larger than 4 cm. The drawing on the right shows stage IB3 cancer in the cervix that is larger than 4 cm.
  stage I childhood Hodgkin lymphoma: (...HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage I childhood Hodgkin lymphoma"
    Stage I is divided into stages I and IE. In stage I, cancer is found in one of the following places in the lymph system: (1) one or more lymph nodes in one lymph node group; (2) Waldeyer’s ring; (3) thymus; or (4) spleen. In stage IE, cancer is found outside the lymph system in one organ or area.
    More Information
    - Childhood Hodgkin Lymphoma Treatment
    Stage I childhood Hodgkin lymphoma. Cancer is found in one or more lymph nodes in a group of lymph nodes or, in rare cases, cancer is found in the Waldeyer’s ring, thymus, or spleen. In stage IE (not shown), cancer has spread to one area outside the lymph system.
    Stage I childhood Hodgkin lymphoma; drawing shows cancer in one lymph node group above the diaphragm and in the spleen. Also shown are the Waldeyer’s ring and the thymus. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.
  stage I childhood liver cancer: (... LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage I childhood liver cancer"
    The tumor was in the liver only and all of the cancer was removed by surgery.
  stage I childhood non-Hodgkin lymphoma: (... non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage I childhood non-Hodgkin lymphoma"
    Cancer is found (1) in one group of lymph nodes; or (2) in one area outside the lymph nodes. No cancer is found in the abdomen or mediastinum (area between the lungs).
    More Information
    - Childhood Non-Hodgkin Lymphoma Treatment
    Stage I childhood non-Hodgkin lymphoma. Cancer is found in one group of lymph nodes or one area outside the lymph nodes, but no cancer is found in the abdomen or mediastinum (area between the lungs).
    Stage I childhood non-Hodgkin lymphoma; drawing shows cancer in one group of lymph nodes. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Lymphoma cells containing cancer are shown in the lymph node.
  stage I chronic lymphocytic leukemia: (… KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "stage I chronic lymphocytic leukemia"
    There are too many lymphocytes in the blood and the lymph nodes are larger than normal.
    More Information
    - Chronic Lymphocytic Leukemia Treatment
  stage I colorectal cancer: (...KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "stage I colorectal cancer"
    Cancer has formed in the mucosa (innermost layer) of the colon and/or rectum wall and has spread to the submucosa (layer of tissue next to the mucosa) or to the muscle layer of the colon and/or rectum wall. Also called Dukes A colorectal cancer.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage I colorectal cancer. Cancer has formed in the mucosa of the colon/rectum wall and has spread to the submucosa or to the muscle layer of the colon/rectum wall.
    Stage I colorectal cancer; drawing shows a cross-section of the colon/rectum. An inset shows the layers of the colon/rectum wall with cancer in the mucosa and submucosa. Also shown are the muscle layers, serosa, a blood vessel, and lymph nodes.
  stage I cutaneous T-cell lymphoma: (... kyoo-TAY-nee-us T-sel lim-FOH-muh)
    Pronunciation of dictionary term "stage I cutaneous T-cell lymphoma"
    May be either of the following: (1) stage IA cancer affecting less than 10% of the skin's surface and appearing as red, dry, scaly patches; (2) stage IB cancer affecting 10% or more of the skin's surface and appearing as red, dry, scaly patches.
  stage I distal bile duct cancer: (... DIS-tul bile dukt KAN-ser)
    Pronunciation of dictionary term "stage I distal bile duct cancer"
    Cancer has spread fewer than 5 millimeters into the wall of the distal bile duct.
    More Information
    - Bile Duct Cancer Stages
  stage I endometrial cancer: (... EN-doh-MEE-tree-ul KAN-ser)
    Pronunciation of dictionary term "stage I endometrial cancer"
    Cancer is found in the uterus only. Stage I is divided into stages IA and IB, based on how far the cancer has spread. In stage IA, cancer is in the endometrium only or less than halfway through the myometrium (muscle layer of the uterus). In stage IB, cancer has spread halfway or more into the myometrium.
    More Information
    - Endometrial Cancer Treatment
    Stage IA and stage IB endometrial cancer. In stage IA, cancer is in the endometrium only or less than halfway through the myometrium (the muscle layer of the uterus). In stage IB, cancer has spread halfway or more into the myometrium.
    Stage IA and stage IB endometrial cancer shown in two cross-section drawings of the uterus and cervix. Drawing on the left shows stage IA, with cancer in the endometrium and myometrium of the uterus. Drawing on the right shows stage IB, with cancer more than halfway through the myometrium. Also shown are the fallopian tubes, ovaries, and vagina.
  stage I endometrial stromal sarcoma: (... EN-doh-MEE-tree-ul STROH-mul sar-KOH-muh)
    Pronunciation of dictionary term "stage I endometrial stromal sarcoma"
    In stage I, the tumor is found in the uterus only. Stage I is divided into stages IA and IB. In stage IA, the tumor is 5 centimeters or smaller. In stage IB, the tumor is larger than 5 centimeters.
    More Information
    - Uterine Sarcoma Treatment
  stage I esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage I esophageal adenocarcinoma"
    Stage I is divided into stages IA, IB, and IC, depending on where the cancer has spread. In stage IA, cancer has spread into the mucosa layer or thin muscle layer of the esophagus wall. The cancer cells are grade 1 or the grade is not known. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells. In stage IB, cancer has spread (1) into the mucosa layer or thin muscle layer of the esophagus wall. The cancer cells are grade 2. Grade 2 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells; or (2) into the submucosa layer of the esophagus wall. The cancer cells are grade 1 or 2 or the grade is not known. In stage IC, cancer has spread (1) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. The cancer cells are grade 3. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 and 2 cancer cells; or (2) into the thick muscle layer of the esophagus wall. The cancer cells are grade 1 or 2.
    More Information
    - Esophageal Cancer Treatment
    Stage IA adenocarcinoma of the esophagus. Cancer has spread into the mucosa layer or thin muscle layer of the esophagus wall. The cancer cells are grade 1 or the grade is not known. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells.
    Stage IA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa layer and thin muscle layer of the esophagus wall. The cancer cells are grade 1 or the grade is not known. Also shown are the submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
    Stage IB adenocarcinoma of the esophagus. Cancer has spread into the mucosa layer or thin muscle layer of the esophagus wall. The cancer cells are grade 2. Grade 2 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells; OR cancer has spread into the submucosa layer of the esophagus wall. The cancer cells are grade 1 or 2 or the grade is not known.
    Stage IB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The lymph nodes are also shown. The left panel shows grade 2 cancer cells in the mucosa layer and thin muscle layer. The right panel shows cancer cells in the mucosa layer, thin muscle layer, and submucosa layer. The cancer cells are grade 1 or 2 or the grade is not known.
    Stage IC adenocarcinoma of the esophagus. Cancer has spread into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. The cancer cells are grade 3. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 and 2 cancer cells; OR cancer has spread into the thick muscle layer of the esophagus wall. The cancer cells are grade 1 or 2.
    Stage IC adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The lymph nodes are also shown. The left panel shows grade 3 cancer cells in the mucosa layer, thin muscle layer, and submucosa layer. The right panel shows grade 1 or 2 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer.
  stage I esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage I esophageal squamous cell carcinoma"
    Stage I is divided into stages IA and IB, depending on where the cancer has spread. In stage IA, cancer has spread into the mucosa layer or thin muscle layer of the esophagus wall. The cancer cells are grade 1 or the grade is not known. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells. In stage IB, cancer has spread (1) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. The cancer cells are any grade or the grade is not known; or (2) into the thick muscle layer of the esophagus wall. The cancer cells are grade 1.
    More Information
    - Esophageal Cancer Treatment
    Stage IA squamous cell carcinoma of the esophagus. Cancer has spread into the mucosa layer or thin muscle layer of the esophagus wall. The cancer cells are grade 1 or the grade is not known. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells.
    Stage IA squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows grade 1 cancer cells or cancer cells of an unknown grade in the mucosa layer and thin muscle layer of the esophagus wall. Also shown are the submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
    Stage IB squamous cell carcinoma of the esophagus. Cancer has spread into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. The cancer cells are any grade or the grade is not known; OR cancer has spread into the thick muscle layer of the esophagus wall. The cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells.
    Stage IB squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The lymph nodes are also shown. The left panel shows cancer cells that are any grade or of an unknown grade in the mucosa layer, thin muscle layer, and submucosa layer. The right panel shows grade 1 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer.
  stage I gallbladder cancer: (... GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "stage I gallbladder cancer"
    Cancer has formed in the mucosa (innermost layer) of the gallbladder wall and may have spread to the muscle layer of the gallbladder wall.
    More Information
    - Gallbladder Cancer Treatment
  stage I gastric cancer: (... GAS-trik KAN-ser)
    Pronunciation of dictionary term "stage I gastric cancer"
    Stage I is divided into stages IA and IB. In stage IA, cancer has formed in the mucosa (innermost layer) of the stomach wall and may have spread to the submucosa (layer of connective tissue between the mucosa and the muscle layer). In stage IB, cancer (1) has formed in the mucosa of the stomach wall and may have spread to the submucosa and has spread to 1 or 2 nearby lymph nodes; or (2) has formed in the mucosa of the stomach wall and has spread to the muscle layer. Also called stage I stomach cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage I gestational trophoblastic neoplasia: (... jeh-STAY-shuh-nul troh-fuh-BLAS-tik NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "stage I gestational trophoblastic neoplasia"
    The tumor is in the uterus only.
    More Information
    - Gestational Trophoblastic Disease Treatment
  stage I HPV-negative oropharyngeal cancer: (... NEH-guh-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage I HPV-negative oropharyngeal cancer"
    The tumor is 2 centimeters or smaller.
    More Information
    - Oropharyngeal Cancer Treatment
  stage I HPV-positive oropharyngeal cancer: (... PAH-zih-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage I HPV-positive oropharyngeal cancer"
    One of the following is true: (1) one or more lymph nodes with cancer that is HPV p16-positive are found but the place where the cancer began is not known. The lymph nodes with cancer are 6 centimeters or smaller, on one side of the neck; or (2) cancer is found in the oropharynx (throat) and the tumor is 4 centimeters or smaller. Cancer may have spread to one or more lymph nodes that are 6 centimeters or smaller, on the same side of the neck as the primary tumor.
    More Information
    - Oropharyngeal Cancer Treatment
  stage I hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage I hypopharyngeal cancer"
    Cancer is found in only one area of the hypopharynx and/or the tumor is 2 centimeters or smaller.
    More Information
    - Hypopharyngeal Cancer Treatment
  stage I intrahepatic bile duct cancer: (... IN-truh-heh-PA-tik bile dukt KAN-ser)
    Pronunciation of dictionary term "stage I intrahepatic bile duct cancer"
    Stage I intrahepatic bile duct cancer is divided into stages IA and IB. In stage IA, cancer has formed in an intrahepatic bile duct and the tumor is 5 centimeters or smaller. In stage IB, cancer has formed in an intrahepatic bile duct and the tumor is larger than 5 centimeters.
    More Information
    - Bile Duct Cancer Stages
  stage I intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage I intraocular melanoma of the ciliary body and choroid"
    The tumor is size category 1 (not more than 12 millimeters wide and not more than 3 millimeters thick; or not more than 9 millimeters wide and 3.1 to 6 millimeters thick) and is in the choroid only.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage I intraocular melanoma of the iris: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... I-ris)
    Pronunciation of dictionary term "stage I intraocular melanoma of the iris"
    The tumor is in the iris only and is not more than one fourth the size of the iris.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage I kidney cancer: (... KID-nee KAN-ser)
    Pronunciation of dictionary term "stage I kidney cancer"
    The tumor is 7 centimeters or smaller and is found in the kidney only. Also called stage I renal cell cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage I kidney cancer. The tumor is 7 centimeters or smaller and is found in the kidney only.
    Stage I kidney cancer; drawing shows cancer in the left kidney and the tumor is 7 centimeters or smaller. An inset shows 7 centimeters is about the size of a peach. Also shown are fatty tissue and the right kidney.
  stage I laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage I laryngeal cancer"
    Cancer has formed in the supraglottis, glottis, or subglottis area of the larynx. Cancer (1) is in one area of the supraglottis and the vocal cords work normally; or (2) is in one or both vocal cords and the vocal cords work normally; or (3) is in the subglottis only.
    More Information
    - Laryngeal Cancer Treatment
  stage I leiomyosarcoma of the uterus: (... LY-oh-MY-oh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage I leiomyosarcoma of the uterus"
    In stage I, the tumor is found in the uterus only. Stage I is divided into stages IA and IB. In stage IA, the tumor is 5 centimeters or smaller. In stage IB, the tumor is larger than 5 centimeters.
    More Information
    - Uterine Sarcoma Treatment
  stage I lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage I lip and oral cavity cancer"
    The tumor is 2 centimeters or smaller and the deepest point of tumor invasion is 5 millimeters or less.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage I malignant pleural mesothelioma: (...muh-LIG-nunt PLOOR-ul MEH-zoh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "stage I malignant pleural mesothelioma"
    Stage I is divided into stages IA and IB. In stage IA, cancer is found in the inside lining of the chest wall on one side of the chest. On the same side of the chest, cancer may also be found in one or more of the following: the thin layer of tissue that covers the lung; the thin layer of tissue that covers the organs between the lungs; and/or the thin layer of tissue that covers the top of the diaphragm. In stage IB, cancer is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. On the same side of the chest, cancer has also spread into one or more of the following: diaphragm; lung tissue; tissue between the ribs and the inside lining of the chest wall; fat in the area between the lungs; soft tissues of the chest wall; and/or sac around the heart.
    More Information
    - Malignant Mesothelioma Treatment
  stage I maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage I maxillary sinus cancer"
    Cancer has formed in the mucous membranes of the maxillary sinus.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage I medullary thyroid cancer: (... MED-yoo-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "stage I medullary thyroid cancer"
    Cancer is found in the thyroid only and the tumor is 2 centimeters or smaller.
    More Information
    - Thyroid Cancer Treatment
    Stage I medullary thyroid cancer. Cancer is found in the thyroid only and the tumor is 2 centimeters or smaller.
    Stage I medullary thyroid cancer; drawing shows cancer in the thyroid gland and the tumor is 2 centimeters or smaller. An inset shows 2 centimeters is about the size of a peanut. Also shown are the larynx and trachea.
  stage I melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage I melanoma"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is not more than 1 millimeter thick, with or without ulceration (a break in the skin). In stage IB, the tumor is more than 1 but not more than 2 millimeters thick, without ulceration.
    More Information
    - Melanoma Treatment
    Stage I melanoma. In stage IA, the tumor is not more than 1 millimeter thick, with or without ulceration (a break in the skin). In stage IB, the tumor is more than 1 but not more than 2 millimeters thick, without ulceration. Skin thickness is different on different parts of the body.
    Two-panel drawing of stage I melanoma; the panel on the left shows a stage IA tumor that is not more than 1 millimeter thick, with ulceration (a break in the skin) and without ulceration. The panel on the right shows a stage IB tumor that is more than 1 but not more than 2 millimeters thick, without ulceration. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
  stage I Merkel cell carcinoma: (stayj ... MER-kul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage I Merkel cell carcinoma"
    The tumor is 2 centimeters or smaller.
    More Information
    - Merkel Cell Carcinoma Treatment
  stage I multiple myeloma: (... MUL-tih-pul MY-eh-LOH-muh)
    Pronunciation of dictionary term "stage I multiple myeloma"
    Relatively few cancer cells have spread throughout the body. There may be no symptoms of disease.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) Treatment
  stage I mycosis fungoides: (... my-KOH-sis fun-GOY-deez)
    Pronunciation of dictionary term "stage I mycosis fungoides"
    Stage I is divided into stages IA and IB. In stage IA, patches, papules, and/or plaques cover less than 10% of the skin surface. In stage IB, patches, papules, and/or plaques cover 10% or more of the skin surface. In both stages, there may be a low number of Sezary cells in the blood.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  stage I nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage I nasal cavity and ethmoid sinus cancer"
    Cancer is found in only one area of either the nasal cavity or the ethmoid sinus and may have spread into bone.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage I nasopharyngeal cancer: (...NAY-zoh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage I nasopharyngeal cancer"
    Cancer (1) is found in the nasopharynx only; or (2) has spread from the nasopharynx to the oropharynx and/or to the nasal cavity.
    More Information
    - Nasopharyngeal Cancer Treatment
  stage I nonmelanoma skin cancer on the eyelid: (... non-MEH-luh-NOH-muh skin KAN-ser ... I-lid)
    Pronunciation of dictionary term "stage I nonmelanoma skin cancer on the eyelid"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is 10 millimeters or smaller and may have spread to the edge of the eyelid where the lashes are, to the connective tissue in the eyelid, or to the full thickness of the eyelid. In stage IB, the tumor is larger than 10 millimeters but not larger than 20 millimeters and has not spread to the edge of the eyelid where the lashes are or to the connective tissue in the eyelid.
    More Information
    - Skin Cancer Treatment
  stage I nonmelanoma skin cancer on the head and neck (not on the eyelid): (… non-MEH-luh-NOH-muh skin KAN-ser ...)
    Pronunciation of dictionary term "stage I nonmelanoma skin cancer on the head and neck (not on the eyelid)"
    The tumor is 2 centimeters or smaller.
    More Information
    - Skin Cancer Treatment
    Stage I nonmelanoma skin cancer of the head and neck. The tumor is 2 centimeters or smaller.
    Stage I nonmelanoma skin cancer of the head and neck; drawing shows cancer in the epidermis (the outer layer of the skin). An inset shows that the tumor is 2 centimeters or smaller and that 2 centimeters is about the size of a peanut. Also shown are the dermis (the inner layer of the skin) and the subcutaneous tissue below the dermis.
  stage I oropharyngeal cancer: (... OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage I oropharyngeal cancer"
    Cancer is 2 centimeters or smaller and is found in the oropharynx only.
    More Information
    - Oropharyngeal Cancer Treatment (Adult)
  stage I ovarian borderline tumor: (… oh-VAYR-ee-un BOR-der-line tumor)
    The tumor is found in one or both ovaries or fallopian tubes. Stage I is divided into stages IA, IB, and IC. In stage IA, the tumor is found inside a single ovary or fallopian tube. In stage IB, the tumor is found inside both ovaries or fallopian tubes. In stage IC, the tumor is found inside one or both ovaries or fallopian tubes and one of the following is true: (1) the tumor ruptured (broke open) during surgery; or (2) the capsule (outer covering) of the ovary ruptured before surgery, or there are tumor cells on the surface of the ovary or fallopian tube; or (3) tumor cells are found in the fluid of the peritoneal cavity (the body cavity that contains most of the organs in the abdomen) or in washings of the peritoneum (tissue lining the peritoneal cavity). Also called stage I ovarian low malignant potential tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage I ovarian epithelial and fallopian tube cancer: (...oh-VAYR-ee-un EH-pih-THEE-lee-ul ... fuh-LOH-pee-in ... KAN-ser)
    Pronunciation of dictionary term "stage I ovarian epithelial and fallopian tube cancer"
    Cancer is found in one or both ovaries or fallopian tubes. Stage I is divided into stages IA, IB, and IC. In stage IA, cancer is found inside a single ovary or fallopian tube. In stage IB, cancer is found inside both ovaries or fallopian tubes. In stage IC, cancer is found inside one or both ovaries or fallopian tubes and one of the following is true: (1) the tumor ruptured (broke open) during surgery; or (2) the capsule (outer covering) of the ovary ruptured before surgery, or there is cancer on the surface of the ovary or fallopian tube; or (3) cancer cells are found in the fluid of the peritoneal cavity (the body cavity that contains most of the organs in the abdomen) or in washings of the peritoneum (tissue lining the peritoneal cavity).
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
    In stage IA, cancer is found inside a single ovary or fallopian tube. In stage IB, cancer is found inside both ovaries or fallopian tubes. In stage IC, cancer is found inside one or both ovaries or fallopian tubes and one of the following is true: (a) either the tumor or the capsule (outer covering) of the ovary has ruptured (broken open), or (b) cancer is also found on the surface of the ovary or fallopian tube, or (c) cancer cells are found in the pelvic peritoneal fluid.
    Three-panel drawing of stage IA, stage IB, and stage IC; each panel shows the ovaries, fallopian tubes, uterus, cervix, and vagina. The first panel (stage IA) shows cancer inside one ovary. The second panel (stage IB) shows cancer inside both ovaries. The third panel (stage IC) shows cancer inside both ovaries and (a) the tumor in the ovary on the left has ruptured (broken open), (b) there is cancer on the surface of the ovary on the right, and (c) there are cancer cells in the pelvic peritoneal fluid (inset).
  stage I ovarian germ cell tumor: (...oh-VAYR-ee-un jerm sel TOO-mer)
    Pronunciation of dictionary term "stage I ovarian germ cell tumor"
    Cancer is found in one or both ovaries or fallopian tubes. Stage I is divided into stages IA, IB, and IC. In stage IA, cancer is found inside a single ovary or fallopian tube. In stage IB, cancer is found inside both ovaries or fallopian tubes. In stage IC, cancer is found inside one or both ovaries or fallopian tubes and one of the following is true: (1) the tumor ruptured (broke open) during surgery; or (2) the capsule (outer covering) of the ovary ruptured before surgery, or there is cancer on the surface of the ovary or fallopian tube; or (3) cancer cells are found in the fluid of the peritoneal cavity (the body cavity that contains most of the organs in the abdomen) or in washings of the peritoneum (tissue lining the peritoneal cavity).
    More Information
    - Ovarian Germ Cell Tumors Treatment
    In stage IA, cancer is found inside a single ovary or fallopian tube. In stage IB, cancer is found inside both ovaries or fallopian tubes. In stage IC, cancer is found inside one or both ovaries or fallopian tubes and one of the following is true: (a) either the tumor or the capsule (outer covering) of the ovary has ruptured (broken open), or (b) cancer is also found on the surface of the ovary or fallopian tube, or (c) cancer cells are found in the pelvic peritoneal fluid.
    Three-panel drawing of stage IA, stage IB, and stage IC; each panel shows the ovaries, fallopian tubes, uterus, cervix, and vagina. The first panel (stage IA) shows cancer inside one ovary. The second panel (stage IB) shows cancer inside both ovaries. The third panel (stage IC) shows cancer inside both ovaries and (a) the tumor in the ovary on the left has ruptured (broken open), (b) there is cancer on the surface of the ovary on the right, and (c) there are cancer cells in the pelvic peritoneal fluid (inset).
  stage I ovarian low malignant potential tumor: (… oh-VAYR-ee-un...muh-LIG-nunt poh-TEN-shul TOO-mer)
    Pronunciation of dictionary term "stage I ovarian low malignant potential tumor"
    The tumor is found in one or both ovaries or fallopian tubes. Stage I is divided into stages IA, IB, and IC. In stage IA, the tumor is found inside a single ovary or fallopian tube. In stage IB, the tumor is found inside both ovaries or fallopian tubes. In stage IC, the tumor is found inside one or both ovaries or fallopian tubes and one of the following is true: (1) the tumor ruptured (broke open) during surgery; or (2) the capsule (outer covering) of the ovary ruptured before surgery, or there are tumor cells on the surface of the ovary or fallopian tube; or (3) tumor cells are found in the fluid of the peritoneal cavity (the body cavity that contains most of the organs in the abdomen) or in washings of the peritoneum (tissue lining the peritoneal cavity). Also called stage I ovarian borderline tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage I pancreatic cancer: (... PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "stage I pancreatic cancer"
    Cancer is found in the pancreas only. Stage I is divided into stages IA and IB, depending on the size of the tumor. In stage IA, the tumor is 2 centimeters or smaller. In stage IB, the tumor is larger than 2 centimeters but not larger than 4 centimeters.
    More Information
    - Pancreatic Cancer Treatment
    Stage I pancreatic cancer. Cancer is found in the pancreas only. In stage IA, the tumor is 2 centimeters or smaller. In stage IB, the tumor is larger than 2 centimeters but not larger than 4 centimeters.
    Stage I pancreatic cancer; drawing on the left shows stage IA pancreatic cancer. The cancer is in the pancreas and the tumor is 2 centimeters or smaller. An inset shows 2 centimeters is about the size of a peanut. The drawing on the right shows stage IB pancreatic cancer. The cancer is in the pancreas and the tumor is larger than 2 centimeters but not larger than 4 centimeters. An inset shows 2 centimeters is about the size of a peanut and 4 centimeters is about the size of a walnut.
  stage I papillary and follicular thyroid cancer (55 years and older): (... PA-pih-LAYR-ee ... fuh-LIH-kyoo-ler THY-royd KAN-ser ...)
    Pronunciation of dictionary term "stage I papillary and follicular thyroid cancer (55 years and older)"
    Cancer is found in the thyroid only and the tumor is 4 centimeters or smaller.
    More Information
    - Thyroid Cancer Treatment
    Stage I papillary and follicular thyroid cancer in patients 55 years and older. Cancer is found in the thyroid only and the tumor is 4 centimeters or smaller.
    Stage I papillary and follicular thyroid cancer in patients 55 years and older; drawing shows cancer in the thyroid gland and the tumor is 4 centimeters or smaller. An inset shows 4 centimeters is about the size of a walnut. Also shown are the larynx and trachea.
  stage I papillary and follicular thyroid cancer (younger than 55 years): (... PA-pih-LAYR-ee ... fuh-LIH-kyoo-ler THY-royd KAN-ser ...)
    Pronunciation of dictionary term "stage I papillary and follicular thyroid cancer (younger than 55 years)"
    The tumor is any size and cancer may have spread to nearby tissues and lymph nodes. Cancer has not spread to other parts of the body.
    More Information
    - Thyroid Cancer Treatment
    Stage I papillary and follicular thyroid cancer in patients younger than 55 years. The tumor is any size and cancer may have spread to nearby tissues and lymph nodes. Cancer has not spread to other parts of the body.
    Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
  stage I penile cancer: (... PEE-nile KAN-ser)
    Pronunciation of dictionary term "stage I penile cancer"
    Cancer has spread to tissue just under the skin of the penis. Cancer has not spread to lymph vessels, blood vessels, or nerves. The cancer cells look more like normal cells under a microscope.
    More Information
    - Penile Cancer Treatment
  stage I perihilar bile duct cancer: (... PAYR-ee-HY-ler bile dukt KAN-ser)
    Pronunciation of dictionary term "stage I perihilar bile duct cancer"
    Cancer has formed in the innermost layer of tissue lining the perihilar bile duct and has spread into the muscle layer or fibrous tissue layer of the perihilar bile duct wall.
    More Information
    - Bile Duct Cancer Stages
  stage I prostate cancer: (...PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage I prostate cancer"
    Cancer is found in the prostate only. The cancer (1) is not felt during a digital rectal exam and is found by needle biopsy done for a high prostate-specific antigen (PSA) level or in a sample of tissue removed during surgery for other reasons (such as benign prostatic hyperplasia). The PSA level is lower than 10 and the Grade Group is 1 (Gleason score is 6 or less ); or (2) is felt during a digital rectal exam and is found in one-half or less of one side of the prostate. The PSA level is lower than 10 and the Grade Group is 1.
    More Information
    - Prostate Cancer Treatment
    Stage I prostate cancer. Cancer is found in the prostate only. The cancer is not felt during a digital rectal exam and is found by needle biopsy done for high prostate-specific antigen (PSA) level or in a sample of tissue removed during surgery for other reasons. The PSA level is less than 10 and the Grade Group is 1; OR the cancer is felt during a digital rectal exam and is found in one-half or less of one side of the prostate. The PSA level is less than 10 and the Grade Group is 1.
    Two panel drawing of stage I prostate cancer; the top panel shows cancer in less than one-half of the right side of the prostate found by needle biopsy. The bottom panel shows cancer in less than one-half of the left side of the prostate found by digital rectal exam. In both panels, the PSA level is less than 10 and the Grade Group is 1. The bladder, rectum, and urethra are also shown.
  stage I renal cell cancer: (... REE-nul sel KAN-ser)
    Pronunciation of dictionary term "stage I renal cell cancer"
    The tumor is 7 centimeters or smaller and is found in the kidney only. Also called stage I kidney cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage I kidney cancer. The tumor is 7 centimeters or smaller and is found in the kidney only.
    Stage I kidney cancer; drawing shows cancer in the left kidney and the tumor is 7 centimeters or smaller. An inset shows 7 centimeters is about the size of a peach. Also shown are fatty tissue and the right kidney.
  stage I salivary gland cancer: (...SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "stage I salivary gland cancer"
    The tumor is in the salivary gland only and is 2 centimeters or smaller.
    More Information
    - Salivary Gland Cancer Treatment
  stage I stomach cancer: (... STUH-muk KAN-ser)
    Pronunciation of dictionary term "stage I stomach cancer"
    Stage I is divided into stages IA and IB. In stage IA, cancer has formed in the mucosa (innermost layer) of the stomach wall and may have spread to the submucosa (layer of connective tissue between the mucosa and the muscle layer). In stage IB, cancer (1) has formed in the mucosa of the stomach wall and may have spread to the submucosa and has spread to 1 or 2 nearby lymph nodes; or (2) has formed in the mucosa of the stomach wall and has spread to the muscle layer. Also called stage I gastric cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage I testicular cancer: (...tes-TIH-kyoo-ler KAN-ser)
    Pronunciation of dictionary term "stage I testicular cancer"
    Stage I is divided into stages IA, IB, and IS. In stage IA, cancer is found in the testicle, including the rete testis, but has not spread to the blood vessels or lymph vessels in the testicle. All tumor marker levels are normal. In stage IB, cancer (1) is found in the testicle, including the rete testis, and has spread to the blood vessels or lymph vessels in the testicle; or (2) has spread into the hilar soft tissue (tissue made of fibers and fat with blood vessels and lymph vessels), the epididymis, or the outer membranes around the testicle; or (3) has spread to the spermatic cord; or (4) has spread to the scrotum. All tumor marker levels are normal. In stage IS, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Tumor marker levels range from slightly above normal to high.
    More Information
    - Testicular Cancer Treatment
  stage I thymoma: (... thy-MOH-muh)
    Pronunciation of dictionary term "stage I thymoma"
    Cancer is found only within the thymus. All cancer cells are inside the capsule (sac) that surrounds the thymus.
    More Information
    - Thymoma and Thymic Carcinoma Treatment
  stage I transitional cell cancer of the renal pelvis and ureter: (... tran-ZIH-shuh-nul sel KAN-ser ... REE-nul PEL-vus ... YER-eh-ter)
    Pronunciation of dictionary term "stage I transitional cell cancer of the renal pelvis and ureter"
    Cancer has spread from the tissue lining the inside of the renal pelvis or ureter to the connective tissue layer.
    More Information
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
  stage I uterine sarcoma: (…YOO-teh-rin sar-KOH-muh)
    Pronunciation of dictionary term "stage I uterine sarcoma"
    Cancer is found in the uterus only. Stage I is divided into stages IA and IB, based on how far the cancer has spread. In stage IA, cancer is in the endometrium only or less than halfway through the myometrium (muscle layer of the uterus). In stage IB, cancer has spread halfway or more into the myometrium.
    More Information
    - Uterine Sarcoma Treatment
  stage I vaginal cancer: (...VA-jih-nul KAN-ser)
    Pronunciation of dictionary term "stage I vaginal cancer"
    Cancer is found in the vaginal wall only.
    More Information
    - Vaginal Cancer Treatment
  stage I vulvar cancer: (... VUL-ver KAN-ser)
    Pronunciation of dictionary term "stage I vulvar cancer"
    The tumor is found only in the vulva. Stage I is divided into stages IA and IB. In stage IA, the tumor is 2 centimeters or smaller and has spread 1 millimeter or less into the tissue of the vulva. Cancer has not spread to the lymph nodes. In stage IB, the tumor is larger than 2 centimeters or has spread more than 1 millimeter into the tissue of the vulva. Cancer has not spread to the lymph nodes.
    More Information
    - Vulvar Cancer Treatment
  stage I Wilms tumor: (... wilmz TOO-mer)
    Pronunciation of dictionary term "stage I Wilms tumor"
    The tumor was completely removed by surgery and all of the following are true: (1) cancer was found only in the kidney and did not spread to blood vessels in the renal sinus (the part of the kidney where it joins the ureter) or to the lymph nodes; (2) no cancer cells were found at the edges of the area where the tumor was removed; (3) the outer layer of the kidney did not break open; (4) the tumor did not break open; and (5) a biopsy was not done before the tumor was removed.
    More Information
    - Wilms Tumor and Other Childhood Kidney Tumors Treatment
  stage IA breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IA breast cancer"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is 2 centimeters or smaller. Cancer has not spread outside the breast.
    More Information
    - Breast Cancer Treatment
    Stage I breast cancer. In stage IA, the tumor is 2 centimeters or smaller and has not spread outside the breast. In stage IB, no tumor is found in the breast or the tumor is 2 centimeters or smaller. Small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes.
    Stage I breast cancer. Drawing shows stage IA on the left; the tumor is 2 cm or smaller and has not spread outside the breast. Drawings in the middle and on the right show stage IB. In the drawing in the middle, no tumor is found in the breast, but small clusters of cancer cells are found in the lymph nodes. In the drawing on the right, the tumor is 2 cm or smaller and small clusters of cancer cells are found in the lymph nodes.
  stage IA esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IA esophageal adenocarcinoma"
    Stage I is divided into stages IA and IB, depending on where the cancer is found. In stage IA, cancer has formed in the mucosa or submucosa layer of the esophagus wall. The cancer cells are grade 1 or 2. Grade 1 and 2 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 3 cancer cells.
    More Information
    - Esophageal Cancer Treatment
    Stage IA adenocarcinoma of the esophagus. Cancer has formed in the mucosa or submucosa layer of the esophagus wall. The cancer cells are grade 1 or 2. Grade 1 and 2 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 3 cancer cells.
    Stage IA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa and submucosa layers of the esophagus wall. Also shown are the muscle and connective tissue layers of the esophagus wall and lymph nodes.
  stage IA esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IA esophageal squamous cell carcinoma"
    Stage I is divided into stages IA and IB, depending on where the cancer is found. In stage IA, cancer has formed in the mucosa or submucosa layer of the esophagus wall. The cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells.
    More Information
    - Esophageal Cancer Treatment
    Stage IA squamous cell cancer of the esophagus. Cancer has formed in the mucosa or submucosa layer of the esophagus wall. The cancer cells are grade 1 or the grade is unknown. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2-3 cancer cells.
    Stage IA squamous cell cancer of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa and submucosa layers of the esophagus wall. Also shown are the muscle and connective tissue layers of the esophagus wall and lymph nodes.
  stage IA non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IA non-small cell lung cancer"
    Stage I non-small cell lung cancer is divided into stages IA and IB. In stage IA, the tumor is in the lung only and is 3 centimeters or smaller. Cancer has not spread to the lymph nodes.
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IA lung cancer. The tumor is in the lung only and is 3 centimeters or smaller. Cancer has not spread to the lymph nodes.
    Stage IA lung cancer; drawing shows a tumor (3 cm or smaller) in the right lung. Also shown are the lymph nodes, trachea, pleura, and diaphragm.
  stage IA soft tissue sarcoma: (...TIH-shoo sar-KOH-muh)
    Pronunciation of dictionary term "stage IA soft tissue sarcoma"
    Stage I is divided into stages IA and IB. In stage IA, the tumor is low-grade (likely to grow and spread slowly) and 5 centimeters or smaller. It may be either superficial (in subcutaneous tissue with no spread into connective tissue or muscle below) or deep (in the muscle and may be in connective or subcutaneous tissue).
  stage IB breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IB breast cancer"
    Stage I is divided into stages IA and IB. In stage IB, small clusters of breast cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes and either: (1) no tumor is found in the breast; or (2) the tumor is 2 centimeters or smaller.
    More Information
    - Breast Cancer Treatment
    Stage I breast cancer. In stage IA, the tumor is 2 centimeters or smaller and has not spread outside the breast. In stage IB, no tumor is found in the breast or the tumor is 2 centimeters or smaller. Small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes.
    Stage I breast cancer. Drawing shows stage IA on the left; the tumor is 2 cm or smaller and has not spread outside the breast. Drawings in the middle and on the right show stage IB. In the drawing in the middle, no tumor is found in the breast, but small clusters of cancer cells are found in the lymph nodes. In the drawing on the right, the tumor is 2 cm or smaller and small clusters of cancer cells are found in the lymph nodes.
  stage IB esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IB esophageal adenocarcinoma"
    Stage I is divided into stages IA and IB, depending on where the cancer is found. In stage IB, cancer has formed (1) in the mucosa or submucosa layer of the esophagus wall, and the cancer cells are grade 3. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 and 2 cancer cells; or (2) in the mucosa or submucosa layer and spread into the muscle layer of the esophagus wall, and the cancer cells are grade 1 or 2. Grade 1 and 2 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 3 cancer cells.
    More Information
    - Esophageal Cancer Treatment
    Stage IB adenocarcinoma of the esophagus. Cancer has formed in the mucosa or submucosa layer of the esophagus wall, and the cancer cells are grade 3. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 or 2 cancer cells; OR cancer has formed in the mucosa or submucosa layer and spread into the muscle layer of the esophagus wall, and the cancer cells are grade 1 or 2. Grade 1 and 2 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 3 cancer cells.
    Stage IB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa, submucosa, muscle, and connective tissue layers. Also shown are lymph nodes. The left panel shows cancer in the mucosa and submucosa layers. The right panel shows cancer in the mucosa, submucosa, and muscle layers.
  stage IB esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IB esophageal squamous cell carcinoma"
    Stage I is divided into stages IA and IB, depending on where the cancer has spread. In stage IB, cancer has spread (1) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. The cancer cells are any grade or the grade is not known; or (2) into the thick muscle layer of the esophagus wall. The cancer cells are grade 1.
    More Information
    - Esophageal Cancer Treatment
    Stage IB squamous cell cancer of the esophagus. Cancer has formed in the mucosa or submucosa layer of the esophagus wall, and the cancer cells are grade 2-3; OR cancer has formed in the mucosa or submucosa layer and spread into the muscle layer or the connective tissue layer of the esophagus wall, and the cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2-3 cancer cells. The tumor is in the lower esophagus or it is not known where the tumor is.
    Stage IB squamous cell cancer of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa, submucosa, muscle, and connective tissue layers. Also shown are lymph nodes. The left panel shows cancer in the mucosa and submucosa layers. The right panel shows cancer in the mucosa, submucosa, and muscle layers.
  stage IB non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IB non-small cell lung cancer"
    Stage I non-small cell lung cancer is divided into stages IA and IB. In stage IB, the tumor is larger than 3 centimeters but not larger than 4 centimeters. Cancer has not spread to the lymph nodes; OR the tumor is 4 centimeters or smaller and one or more of the following is found: (1) cancer has spread to the main bronchus, but has not spread to the carina; and/or (2) cancer has spread to the innermost layer of the membrane that covers the lung; and/or (3) part of the lung or the whole lung has collapsed or has developed pneumonitis. Cancer has not spread to the lymph nodes.
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IB lung cancer. The tumor is larger than 3 centimeters but not larger than 4 centimeters. Cancer has not spread to the lymph nodes; OR the tumor is 4 centimeters or smaller. Cancer has not spread to the lymph nodes and one or more of the following is found: (a) cancer has spread to the main bronchus, but has not spread to the carina; and/or (b) cancer has spread to the inner membrane that covers the lung; and/or (c) part of the lung or the whole lung has collapsed or has pneumonitis (inflammation of the lung).
    Two-panel drawing of stage IB lung cancer; the panel on the left shows a tumor (larger than 3 cm but not larger than 4 cm) in the right lung. Also shown are the pleura and diaphragm. The panel on the right shows a primary tumor (4 cm or smaller) in the left lung and cancer in (a) the left main bronchus and (b) the inner membrane covering the lung (inset). Also shown is (c) part or all of the lung has collapsed or has pneumonitis (inflammation). The carina and a rib (inset) are also shown.
  stage IB soft tissue sarcoma: (...TIH-shoo sar-KOH-muh)
    Pronunciation of dictionary term "stage IB soft tissue sarcoma"
    Stage I is divided into stages IA and IB. In stage IB, the tumor is low-grade (likely to grow and spread slowly) and larger than 5 centimeters. It may be either superficial (in subcutaneous tissue with no spread into connective tissue or muscle below) or deep (in the muscle and may be in connective or subcutaneous tissue).
  stage II adenosarcoma of the uterus: (... A-deh-noh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage II adenosarcoma of the uterus"
    The tumor has spread outside the uterus into the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, the tumor has spread to the ovary, fallopian tube, or connective tissues around the uterus. In stage IIB, the tumor has spread to other tissues in the pelvis.
    More Information
    - Uterine Sarcoma Treatment
  stage II adrenocortical cancer: (... uh-DREE-noh-KOR-tih-kul KAN-ser)
    Pronunciation of dictionary term "stage II adrenocortical cancer"
    The tumor is larger than 5 centimeters and is found in the adrenal gland only.
    More Information
    - Adrenocortical Carcinoma Treatment
  stage II adult Hodgkin lymphoma: (... uh-dult HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage II adult Hodgkin lymphoma"
    Stage II is divided into stages II and IIE. In stage II, cancer is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm. In stage IIE, cancer has spread from a group of lymph nodes to a nearby area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    More Information
    - Hodgkin Lymphoma Treatment
    Stage II adult lymphoma. Cancer is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm.
    Stage II adult lymphoma; drawing shows cancer in two lymph node groups above the diaphragm and below the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
    Stage IIE adult lymphoma. Cancer has spread from a group of lymph nodes to a nearby area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    Stage IIE adult lymphoma; drawing shows cancer that has spread from a group of lymph nodes to a nearby area. Also shown is a lung and the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
  stage II adult non-Hodgkin lymphoma: (... uh-dult non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage II adult non-Hodgkin lymphoma"
    Stage II is divided into stages II and IIE. In stage II, cancer is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm. In stage IIE, cancer has spread from a group of lymph nodes to a nearby area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    More Information
    - Non-Hodgkin Lymphoma Treatment
    Stage II adult lymphoma. Cancer is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm.
    Stage II adult lymphoma; drawing shows cancer in two lymph node groups above the diaphragm and below the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
    Stage IIE adult lymphoma. Cancer has spread from a group of lymph nodes to a nearby area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    Stage IIE adult lymphoma; drawing shows cancer that has spread from a group of lymph nodes to a nearby area. Also shown is a lung and the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
  stage II adult primary liver cancer: (... uh-DULT PRY-mayr-ee LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage II adult primary liver cancer"
    There is either (1) one tumor that has spread to nearby blood vessels; or (2) there is more than one tumor, none of which is larger than 5 centimeters.
  stage II adult soft tissue sarcoma of the retroperitoneum: (… uh-DULT ... TIH-shoo sar-KOH-muh ... REH-troh-PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "stage II adult soft tissue sarcoma of the retroperitoneum"
    The tumor is 5 centimeters or smaller and is mid grade or high grade. Mid-grade and high-grade cancer cells look more abnormal under a microscope and grow and spread more quickly than low-grade cancer cells.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage II adult soft tissue sarcoma of the trunk, arms, and legs: (... uh-DULT ... TIH-shoo sar-KOH-muh ...)
    Pronunciation of dictionary term "stage II soft tissue sarcoma of the trunk, arms, and legs"
    The tumor is 5 centimeters or smaller and is mid grade or high grade. Mid-grade and high-grade cancer cells look more abnormal under a microscope and grow and spread more quickly than low-grade cancer cells.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage II AIDS-related lymphoma: (... ree-LAY-ted lim-FOH-muh)
    Pronunciation of dictionary term "stage II AIDS-related lymphoma"
    Stage II is divided into stages II and IIE. In stage II, cancer is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm. In stage IIE, cancer has spread from a group of lymph nodes to a nearby area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    More Information
    - AIDS-Related Lymphoma Treatment
    Stage II adult lymphoma. Cancer is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm.
    Stage II adult lymphoma; drawing shows cancer in two lymph node groups above the diaphragm and below the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
    Stage IIE adult lymphoma. Cancer has spread from a group of lymph nodes to a nearby area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    Stage IIE adult lymphoma; drawing shows cancer that has spread from a group of lymph nodes to a nearby area. Also shown is a lung and the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown in the lymph node.
  stage II anal cancer: (... AY-nul KAN-ser)
    Pronunciation of dictionary term "stage II anal cancer"
    Stage II anal cancer is divided into stages IIA and IIB. In stage IIA, the tumor is larger than 2 centimeters but not larger than 5 centimeters. In stage IIB, the tumor is larger than 5 centimeters.
    More Information
    - Anal Cancer Treatment
  stage II bladder cancer: (... BLA-der KAN-ser)
    Pronunciation of dictionary term "stage II bladder cancer"
    Cancer has spread through the connective tissue into the muscle layers of the bladder. Stage II bladder cancer may also be described as muscle-invasive bladder cancer.
    More Information
    - Bladder Cancer Stages
    Stage II bladder cancer (muscle-invasive bladder cancer). Cancer has spread through the connective tissue into the muscle layers of the bladder.
    Stage II bladder cancer (muscle-invasive bladder cancer); drawing shows the bladder, ureter, prostate, and urethra. An inset shows cancer in the inner lining of the bladder and in the layer of connective tissue and the muscle layers of the bladder. Also shown is the layer of fat around the bladder.
  stage II breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage II breast cancer"
    Stage II is divided into stages IIA and IIB. In stage IIA, (1) no tumor is found in the breast or the tumor is 2 centimeters or smaller. Cancer (larger than 2 millimeters) is found in 1 to 3 axillary lymph nodes or in the lymph nodes near the breastbone (found during a sentinel lymph node biopsy); or (2) the tumor is larger than 2 centimeters but not larger than 5 centimeters. Cancer has not spread to the lymph nodes. In stage IIB, the tumor is (1) larger than 2 centimeters but not larger than 5 centimeters. Small clusters of breast cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes; or (2) larger than 2 centimeters but not larger than 5 centimeters. Cancer has spread to 1 to 3 axillary lymph nodes or to the lymph nodes near the breastbone (found during a sentinel lymph node biopsy); or (3) larger than 5 centimeters. Cancer has not spread to the lymph nodes.
    More Information
    - Breast Cancer Treatment
    Stage IIA breast cancer. No tumor is found in the breast and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (left panel); OR the tumor is 2 centimeters or smaller and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (middle panel); OR the tumor is larger than 2 centimeters but not larger than 5 centimeters and has not spread to the lymph nodes (right panel).
    Stage IIA breast cancer. Drawing on the left shows no tumor in the breast, but cancer is found in 3 axillary lymph nodes. Drawing in the middle shows the tumor size is 2 cm or smaller and cancer is found in 3 axillary lymph nodes. Drawing on the right shows the tumor is larger than 2 cm but not larger than 5 cm and has not spread to the lymph nodes.
    Stage IIB breast cancer. The tumor is larger than 2 centimeters but not larger than 5 centimeters and small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes (left panel); OR the tumor is larger than 2 centimeters but not larger than 5 centimeters and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (middle panel); OR the tumor is larger than 5 centimeters and has not spread to the lymph nodes (right panel).
    Stage IIB breast cancer. The drawing on the left shows the tumor is larger than 2 cm but not larger than 5 cm and small clusters of cancer cells are in the lymph nodes. The drawing in the middle shows the tumor is larger than 2 cm but not larger than 5 cm and cancer is in 3 axillary lymph nodes. The drawing on the right shows the tumor is larger than 5 cm but has not spread to the lymph nodes.
  stage II cancer of the uterus: (... KAN-ser ... YOO-ter-us)
    Pronunciation of dictionary term "stage II cancer of the uterus"
    Cancer that has spread to the cervix.
  stage II cervical cancer: (... SER-vih-kul KAN-ser)
    Pronunciation of dictionary term "stage II cervical cancer"
    Cancer has spread to the upper two-thirds of the vagina or to the tissue around the uterus. Stage II is divided into stages IIA and IIB, based on how far the cancer has spread. In stage IIA, cancer has spread from the cervix to the upper two-thirds of the vagina but has not spread to the tissue around the uterus. Stage IIA is divided into stages IIA1 and IIA2, based on the size of the tumor. In stage IIA1, the tumor is 4 centimeters or smaller. In stage IIA2, the tumor is larger than 4 centimeters. In stage IIB, cancer has spread from the cervix to the tissue around the uterus.
    More Information
    - Cervical Cancer Stages
    Stage II cervical cancer. In stages IIA1 and IIA2, cancer has spread from the cervix to the upper two-thirds of the vagina but has not spread to the tissue around the uterus. In stage IIA1, the cancer is 4 centimeters or smaller. In stage IIA2, the cancer is larger than 4 centimeters. In stage IIB, cancer has spread from the cervix to the tissue around the uterus.
    Stage II cervical cancer; drawing shows two cross-sections of the uterus, cervix, and vagina. The drawing on the left shows stages IIA1 and IIA2 cancer in the cervix that is 4 cm and has spread to the upper two-thirds of the vagina. The drawing on the right shows stage IIB cancer that has spread from the cervix to the tissue around the uterus.
  stage II childhood Hodgkin lymphoma: (...HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage II childhood Hodgkin lymphoma"
    Stage II is divided into stages II and IIE. In stage II, cancer is found in two or more lymph node groups either above or below the diaphragm (the thin muscle below the lungs that helps breathing and separates the chest from the abdomen). In stage IIE, cancer has spread from a group of lymph nodes to a nearby organ or area that is outside the lymph system. Cancer may have spread to other lymph node groups on the same side of the diaphragm.
    More Information
    - Childhood Hodgkin Lymphoma Treatment
    Stage II childhood Hodgkin lymphoma. Cancer is found in two or more lymph node groups that are either above the diaphragm or below the diaphragm.
    Stage II childhood Hodgkin lymphoma; drawing shows cancer in two lymph node groups above the diaphragm and below the diaphragm. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.
    Stage IIE childhood Hodgkin lymphoma. Cancer has spread from a group of lymph nodes to a nearby organ or area that is outside the lymph system.
    Stage IIE childhood Hodgkin lymphoma; drawing shows cancer in a lymph node group above the diaphragm and cancer that has spread to a nearby area (the left lung). An inset shows a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.
  stage II childhood liver cancer: (... LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage II childhood liver cancer"
    The tumor was in the liver only. After the cancer was removed by surgery, a small amount of cancer remains that can only be seen with a microscope.
  stage II childhood non-Hodgkin lymphoma: (... non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage II childhood non-Hodgkin lymphoma"
    Cancer is found (1) in one area outside the lymph nodes and in nearby lymph nodes; or (2) in two or more areas above or below the diaphragm (the thin muscle below the lungs and heart that separates the chest from the abdomen), and may have spread to nearby lymph nodes; or (3) to have started in the stomach or intestines and can be completely removed by surgery. Cancer may have spread to certain nearby lymph nodes.
    More Information
    - Childhood Non-Hodgkin Lymphoma Treatment
    Stage II childhood non-Hodgkin lymphoma. Cancer is found in one area outside the lymph nodes and in nearby lymph nodes (a); or in two or more areas above (b) or below (c) the diaphragm; or cancer started in the stomach, appendix, or intestines (d) and can be removed by surgery.
    Stage II childhood non-Hodgkin lymphoma; drawing shows cancer in lymph node groups above and below the diaphragm, in the liver, and in the appendix. The colon and small intestine are also shown. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Lymphoma cells containing cancer are shown in the lymph node.
  stage II chronic lymphocytic leukemia: (… KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "stage II chronic lymphocytic leukemia"
    There are too many lymphocytes in the blood, the liver or spleen is larger than normal, and the lymph nodes may be larger than normal.
    More Information
    - Chronic Lymphocytic Leukemia Treatment
  stage II colorectal cancer: (...KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "stage II colorectal cancer"
    Stage II colorectal cancer is divided into stages IIA, IIB, and IIC. In stage IIA, cancer has spread through the muscle layer of the colon and/or rectum wall to the serosa (outermost layer) of the colon and/or rectum wall. In stage IIB, cancer has spread through the serosa of the colon and/or rectum wall to the tissue that lines the organs in the abdomen (visceral peritoneum). In stage IIC, cancer has spread through the serosa of the colon and/or rectum wall to nearby organs.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage II colorectal cancer. In stage IIA, cancer has spread through the muscle layer of the colon/rectum wall to the serosa. In stage IIB, cancer has spread through the serosa of the colon/rectum wall to the visceral peritoneum (tissue that lines the organs in the abdomen). In stage IIC, cancer has spread through the serosa of the colon/rectum wall to nearby organs.
    Stage II colorectal cancer; drawing shows a cross-section of the colon/rectum and a three-panel inset. Each panel shows the layers of the colon/rectum wall: the mucosa, submucosa, muscle layers, and serosa. Also shown are a blood vessel and lymph nodes. The first panel shows stage IIA with cancer in the mucosa, submucosa, muscle layers, and serosa. The second panel shows stage IIB with cancer in all layers and spreading through the serosa to the visceral peritoneum. The third panel shows stage IIC with cancer in all layers and spreading through the serosa to nearby organs.
  stage II cutaneous T-cell lymphoma: (... kyoo-TAY-nee-us T-sel lim-FOH-muh)
    Pronunciation of dictionary term "stage II cutaneous T-cell lymphoma"
    Stage II cutaneous T-cell lymphoma may be either of the following: (1) stage IIA, in which the skin has red, dry, scaly patches but no tumors, and lymph nodes are enlarged but do not contain cancer cells; (2) stage IIB, in which tumors are found on the skin, and lymph nodes are enlarged but do not contain cancer cells.
  stage II distal bile duct cancer: (... DIS-tul bile dukt KAN-ser)
    Pronunciation of dictionary term "stage II distal bile duct cancer"
    Stage II is divided into stages IIA and IIB. In stage IIA, cancer has spread (1) fewer than 5 millimeters into the wall of the distal bile duct and has spread to 1 to 3 nearby lymph nodes; or (2) 5 to 12 millimeters into the wall of the distal bile duct. In stage IIB, cancer has spread 5 millimeters or more into the wall of the distal bile duct. Cancer may have spread to 1 to 3 nearby lymph nodes.
    More Information
    - Bile Duct Cancer Stages
  stage II endometrial cancer: (... EN-doh-MEE-tree-ul KAN-ser)
    Pronunciation of dictionary term "stage II endometrial cancer"
    Cancer has spread into connective tissue of the cervix, but has not spread outside the uterus.
    More Information
    - Endometrial Cancer Treatment
    Stage II endometrial cancer. Cancer has spread into connective tissue of the cervix, but has not spread outside the uterus.
    Stage II endometrial cancer shown in a cross-section drawing of the uterus, cervix, fallopian tubes, ovaries, and vagina. Cancer is shown in the endometrium and myometrium of the uterus and in the cervix.
  stage II endometrial stromal sarcoma: (... EN-doh-MEE-tree-ul STROH-mul sar-KOH-muh)
    Pronunciation of dictionary term "stage II endometrial stromal sarcoma"
    The tumor has spread beyond the uterus, but has not spread beyond the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, the tumor has spread to the ovary, fallopian tube, or connective tissues around the uterus. In stage IIB, the tumor has spread to other tissues in the pelvis.
    More Information
    - Uterine Sarcoma Treatment
  stage II esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage II esophageal adenocarcinoma"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread. In stage IIA, cancer has spread into the thick muscle layer of the esophagus wall. The cancer cells are grade 3 or the grade is not known. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 and 2 cancer cells. In stage IIB, cancer has spread (1) into the connective tissue layer of the esophagus wall; or (2) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 1 or 2 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIA adenocarcinoma of the esophagus. Cancer has spread into the thick muscle layer of the esophagus wall. The cancer cells are grade 3 or the grade is not known. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 and 2 cancer cells.
    Stage IIA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer of the esophagus wall. The cancer cells are grade 3 or the grade is not known. Also shown is the connective tissue layer of the esophagus wall and the lymph nodes.
    Stage IIB adenocarcinoma of the esophagus. Cancer has spread into the connective tissue layer of the esophagus wall; OR cancer has spread into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 1 to 2 lymph nodes near the tumor.
    Stage IIB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The right panel shows cancer in the mucosa layer, thin muscle layer, and submucosa layer and in 1 lymph node near the tumor.
  stage II esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage II esophageal squamous cell carcinoma"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread. In stage IIA, cancer has spread (1) into the thick muscle layer of the esophagus wall. The cancer cells are grade 2 or 3 or the grade is not known. Grade 2 and 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells; or (2) into the connective tissue layer of the esophagus wall. The tumor is in the lower esophagus; or (3) into the connective tissue layer of the esophagus wall. The cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells. The tumor is in either the upper or middle esophagus. In stage IIB, cancer has spread (1) into the connective tissue layer of the esophagus wall. The cancer cells are grade 2 or 3. The tumor is in either the upper or middle esophagus; or (2) into the connective tissue layer of the esophagus wall. The grade of the cancer cells is not known, or it is not known where the tumor has formed in the esophagus; or (3) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 1 or 2 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIA squamous cell carcinoma of the esophagus (1). Cancer has spread into the thick muscle layer of the esophagus wall. The cancer cells are grade 2 or 3 or the grade is not known. Grade 2 and 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells.
    Stage IIA squamous cell carcinoma of the esophagus (1); drawing shows the esophagus and stomach. An inset shows grade 2 or 3 cancer cells or cancer cells of an unknown grade in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer of the esophagus wall. Also shown are the connective tissue layer of the esophagus wall and the lymph nodes.
    Stage IIA squamous cell carcinoma of the esophagus (2). Cancer has spread into the connective tissue layer of the esophagus wall. The tumor is in the lower esophagus.
    Stage IIA squamous cell carcinoma of the esophagus (2); drawing shows the esophagus, including the lower part of the esophagus, and the stomach. An inset shows cancer cells of any grade in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the lower esophagus wall. The lymph nodes are also shown.
    Stage IIA squamous cell carcinoma of the esophagus (3). Cancer has spread into the connective tissue layer of the esophagus wall. The cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells. The tumor is in either the upper or middle esophagus.
    Stage IIA squamous cell carcinoma of the esophagus (3); drawing shows the upper and middle parts of the esophagus and the stomach. An inset shows grade 1 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the upper and middle esophagus wall. The lymph nodes are also shown.
    Stage IIB squamous cell carcinoma of the esophagus (1). Cancer has spread into the connective tissue layer of the esophagus wall. The cancer cells are grade 2 or 3. Grade 2 and 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells. The tumor is in either the upper or middle esophagus.
    Stage IIB squamous cell carcinoma of the esophagus (1); drawing shows the upper and middle parts of the esophagus and the stomach. An inset shows grade 2 or 3 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the upper and middle esophagus wall.
    Stage IIB squamous cell carcinoma of the esophagus (2). Cancer has spread into the connective tissue layer of the esophagus wall. The grade of the cancer cells is not known, or it is not known where the tumor has formed in the esophagus.
    Stage IIB squamous cell carcinoma of the esophagus (2); drawing shows the esophagus and stomach. An inset shows (a) cancer cells of an unknown grade in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. Also shown is (b) the location of the tumor in the esophagus is unknown.
    Stage IIB squamous cell carcinoma of the esophagus (3). Cancer has spread into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 1 to 2 lymph nodes near the tumor.
    Stage IIB squamous cell carcinoma of the esophagus (3); drawing shows the esophagus and stomach. An inset shows cancer cells of any grade in the mucosa layer, thin muscle layer, and submucosa layer of the esophagus wall. Also shown are the thick muscle layer and connective tissue layer of the esophagus wall and cancer in 1 lymph node near the tumor.
  stage II gallbladder cancer: (... GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "stage II gallbladder cancer"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread in the gallbladder. In stage IIA, cancer has spread through the muscle layer to the connective tissue layer of the gallbladder wall on the side of the gallbladder that is not near the liver. In stage IIB, cancer has spread through the muscle layer to the connective tissue layer of the gallbladder wall on the same side as the liver. Cancer has not spread to the liver.
    More Information
    - Gallbladder Cancer Treatment
  stage II gastric cancer: (... GAS-trik KAN-ser)
    Pronunciation of dictionary term "stage II gastric cancer"
    Stage II is divided into stages IIA and IIB. In stage IIA, cancer (1) may have spread to the submucosa (layer of connective tissue between the mucosa and the muscle layer) of the stomach wall and has spread to 3 to 6 nearby lymph nodes; or (2) has spread to the muscle layer of the stomach wall and to 1 or 2 nearby lymph nodes; or (3) has spread to the subserosa (layer of connective tissue between the muscle layer and the outermost layer called the serosa) of the stomach wall. In stage IIB, cancer (1) may have spread to the submucosa of the stomach wall and has spread to 7 to 15 nearby lymph nodes; or (2) has spread to the muscle layer of the stomach wall and to 3 to 6 nearby lymph nodes; or (3) has spread to the subserosa of the stomach wall and to 1 or 2 nearby lymph nodes; or (4) has spread to the serosa of the stomach wall. Also called stage II stomach cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage II gestational trophoblastic neoplasia: (... jeh-STAY-shuh-nul troh-fuh-BLAS-tik NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "stage II gestational trophoblastic neoplasia"
    The tumor has spread beyond the uterus to the ovary, fallopian tube, vagina, and/or the connective tissues around the uterus.
    More Information
    - Gestational Trophoblastic Disease Treatment
  stage II HPV-negative oropharyngeal cancer: (... NEH-guh-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage II HPV-negative oropharyngeal cancer"
    The tumor is larger than 2 centimeters but not larger than 4 centimeters.
    More Information
    - Oropharyngeal Cancer Treatment
  stage II HPV-positive oropharyngeal cancer: (… PAH-zih-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage II HPV-positive oropharyngeal cancer"
    One of the following is true: (1) one or more lymph nodes with cancer that is HPV p16-positive are found but the place where the cancer began is not known. The lymph nodes with cancer are 6 centimeters or smaller, on one or both sides of the neck; or (2) the tumor is 4 centimeters or smaller. Cancer has spread to lymph nodes that are 6 centimeters or smaller, on the opposite side of the neck as the primary tumor or on both sides of the neck; or (3) the tumor is larger than 4 centimeters or cancer has spread to the top of the epiglottis (the flap that covers the trachea during swallowing). Cancer may have spread to one or more lymph nodes that are 6 centimeters or smaller, anywhere in the neck.
    More Information
    - Oropharyngeal Cancer Treatment
  stage II hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage II hypopharyngeal cancer"
    The tumor is (1) found in more than one area of the hypopharynx or in a nearby area; or (2) larger than 2 centimeters but not larger than 4 centimeters and has not spread to the larynx (voice box).
    More Information
    - Hypopharyngeal Cancer Treatment
  stage II intrahepatic bile duct cancer: (... IN-truh-heh-PA-tik bile dukt KAN-ser)
    Pronunciation of dictionary term "stage II intrahepatic bile duct cancer"
    Either of the following is found: (1) the tumor has spread through the wall of an intrahepatic bile duct and into a blood vessel; or (2) more than one tumor has formed in the intrahepatic bile duct and may have spread into a blood vessel.
    More Information
    - Bile Duct Cancer Stages
  stage II intraocular melanoma of the iris: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... I-ris)
    Pronunciation of dictionary term "stage II intraocular melanoma of the iris"
    Stage II is divided into stages IIA and IIB. In stage IIA, the tumor (1) is in the iris only and is more than one fourth the size of the iris; or (2) is in the iris only and has caused glaucoma; or (3) has spread next to and/or into the ciliary body, choroid, or both. The tumor has caused glaucoma. In stage IIB, the tumor has spread next to and/or into the ciliary body, choroid, or both, and has also spread into the sclera. The tumor has caused glaucoma.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage II kidney cancer: (... KID-nee KAN-ser)
    Pronunciation of dictionary term "stage II kidney cancer"
    The tumor is larger than 7 centimeters and is found in the kidney only. Also called stage II renal cell cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage II kidney cancer. The tumor is larger than 7 centimeters and is found in the kidney only.
    Stage II kidney cancer; drawing shows cancer in the left kidney and the tumor is larger than 7 centimeters. An inset shows 7 centimeters is about the size of a peach. Also shown are the fatty tissue and right kidney.
  stage II laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage II laryngeal cancer"
    Cancer has formed in the supraglottis, glottis, or subglottis area of the larynx. Cancer (1) is in more than one area of the supraglottis or has spread to the area at the base of the tongue or to tissues near the vocal cords. The vocal cords work normally; or (2) has spread from the glottis to the supraglottis, subglottis, or both, and/or the vocal cords do not work normally; or (3) has spread from the subglottis to one or both vocal cords and the vocal cords may not work normally.
    More Information
    - Laryngeal Cancer Treatment
  stage II leiomyosarcoma of the uterus: (... LY-oh-MY-oh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage II leiomyosarcoma of the uterus"
    The tumor has spread beyond the uterus, but has not spread beyond the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, the tumor has spread to the ovary, fallopian tube, or connective tissues around the uterus. In stage IIB, the tumor has spread to other tissues in the pelvis.
    More Information
    - Uterine Sarcoma Treatment
  stage II lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage II lip and oral cavity cancer"
    The tumor (1) is 2 centimeters or smaller and the deepest point of tumor invasion is greater than 5 millimeters; or (2) is larger than 2 centimeters but not larger than 4 centimeters and the deepest point of tumor invasion is 10 millimeters or less.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage II malignant pleural mesothelioma: (...muh-LIG-nunt PLOOR-ul MEH-zoh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "stage II malignant pleural mesothelioma"
    Cancer (1) is found in the inside lining of the chest wall on one side of the chest. On the same side of the chest, cancer may also be found in one or more of the following: the thin layer of tissue that covers the lung; the thin layer of tissue that covers the organs between the lungs; and/or the thin layer of tissue that covers the top of the diaphragm. Cancer has spread to lymph nodes along the center of the chest on the same side of the chest as the tumor; or (2) is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. On the same side of the chest, cancer has also spread into the diaphragm and/or lung tissue. Cancer has spread to lymph nodes along the center of the chest on the same side of the chest as the tumor.
    More Information
    - Malignant Mesothelioma Treatment
  stage II maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage II maxillary sinus cancer"
    Cancer has spread to bone around the maxillary sinus, including the roof of the mouth and the nose, but not to bone at the back of the maxillary sinus or the part of the sphenoid bone behind the upper jaw.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage II medullary thyroid cancer: (... MED-yoo-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "stage II medullary thyroid cancer"
    One of the following is found: (1) cancer is found in the thyroid only and the tumor is larger than 2 centimeters; or (2) the tumor is any size and cancer has spread from the thyroid to nearby muscles in the neck.
    More Information
    - Thyroid Cancer Treatment
    Stage II medullary thyroid cancer. The cancer (a) is found in the thyroid only and the tumor is larger than 2 centimeters; or (b) has spread from the thyroid to nearby muscles in the neck and the tumor is any size.
    Stage II medullary thyroid cancer; drawing shows (a) cancer in the thyroid gland and the tumor is larger than 2 centimeters and (b) cancer has spread to nearby muscles in the neck. An inset shows 2 centimeters is about the size of a peanut. Also shown are the larynx and trachea.
  stage II melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage II melanoma"
    Stage II is divided into stages IIA, IIB, and IIC. In stage IIA, the tumor is either (1) more than 1 but not more than 2 millimeters thick, with ulceration (a break in the skin); or (2) more than 2 but not more than 4 millimeters thick, without ulceration. In stage IIB, the tumor is either (1) more than 2 but not more than 4 millimeters thick, with ulceration; or (2) more than 4 millimeters thick, without ulceration. In stage IIC, the tumor is more than 4 millimeters thick, with ulceration.
    More Information
    - Melanoma Treatment
    Stage IIA melanoma. The tumor is more than 1 but not more than 2 millimeters thick, with ulceration (a break in the skin); OR it is more than 2 but not more than 4 millimeters thick, without ulceration. Skin thickness is different on different parts of the body.
    Two-panel drawing of stage IIA melanoma; the panel on the left shows a tumor that is more than 1 but not more than 2 millimeters thick, with ulceration (a break in the skin). The panel on the right shows a tumor that is more than 2 but not more than 4 millimeters thick, without ulceration. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
    Stage IIB melanoma. The tumor is more than 2 but not more than 4 millimeters thick, with ulceration (a break in the skin); OR it is more than 4 millimeters thick, without ulceration. Skin thickness is different on different parts of the body.
    Two-panel drawing of stage IIB melanoma; the panel on the left shows a tumor that is more than 2 but not more than 4 millimeters thick, with ulceration (a break in the skin). There is also an inset that shows 2 millimeters is about the size of a new crayon point and 5 millimeters is about the size of a pencil-top eraser. The panel on the right shows a tumor that is more than 4 millimeters thick, without ulceration. There is also an inset that shows 5 millimeters is about the size of a pencil-top eraser. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
    Stage IIC melanoma. The tumor is more than 4 millimeters thick, with ulceration (a break in the skin). Skin thickness is different on different parts of the body.
    Stage IIC melanoma; drawing shows a tumor that is more than 4 millimeters thick, with ulceration (a break in the skin). Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
  stage II Merkel cell carcinoma: (stayj ... MER-kul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage II Merkel cell carcinoma"
    Stage II Merkel cell carcinoma is divided into stages IIA and IIB. In stage IIA, the tumor is larger than 2 centimeters. In stage IIB, the tumor has spread to nearby connective tissue, muscle, cartilage, or bone.
    More Information
    - Merkel Cell Carcinoma Treatment
  stage II multiple myeloma: (... MUL-tih-pul MY-eh-LOH-muh)
    Pronunciation of dictionary term "stage II multiple myeloma"
    Cancer in which a moderate number of cancer cells have spread throughout the body.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) Treatment
  stage II mycosis fungoides: (... my-KOH-sis fun-GOY-deez)
    Pronunciation of dictionary term "stage II mycosis fungoides"
    Stage II is divided into stages IIA and IIB. In stage IIA, patches, papules, and/or plaques cover any amount of the skin surface. Lymph nodes are abnormal, but they are not cancerous. In stage IIB, one or more tumors that are 1 centimeter or larger are found on the skin. Lymph nodes may be abnormal, but they are not cancerous. In both stages, there may be a low number of Sezary cells in the blood.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  stage II nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage II nasal cavity and ethmoid sinus cancer"
    Cancer is found in two areas of either the nasal cavity or the ethmoid sinus that are near each other, or cancer has spread to an area next to the sinuses. Cancer may have also spread into bone.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage II nasopharyngeal cancer: (...NAY-zoh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage II nasopharyngeal cancer"
    One of the following is true: (1) cancer has spread to one or more lymph nodes on one side of the neck and/or to one or more lymph nodes on one or both sides of the back of the throat. The affected lymph nodes are 6 centimeters or smaller. Cancer is found in the nasopharynx only, or has spread from the nasopharynx to the oropharynx and/or to the nasal cavity, or is found only in the lymph nodes in the neck. The cancer cells in the lymph nodes are infected with Epstein-Barr virus (a virus linked to nasopharyngeal cancer); or (2) cancer has spread to the parapharyngeal space (area near the pharynx, between the base of the skull and the lower jaw) and/or to nearby muscles. Cancer may have also spread to one or more lymph nodes on one side of the neck and/or to one or more lymph nodes on one or both sides of the back of the throat. The affected lymph nodes are 6 centimeters or smaller.
    More Information
    - Nasopharyngeal Cancer Treatment
  stage II nonmelanoma skin cancer on the eyelid: (... non-MEH-luh-NOH-muh skin KAN-ser ... I-lid)
    Pronunciation of dictionary term "stage II nonmelanoma skin cancer on the eyelid"
    Stage II is divided into stages IIA and IIB. In stage IIA, the tumor is (1) larger than 10 millimeters but not larger than 20 millimeters and has spread to the edge of the eyelid where the lashes are, to the connective tissue in the eyelid, or to the full thickness of the eyelid; or (2) larger than 20 millimeters but not larger than 30 millimeters and may have spread to the edge of the eyelid where the lashes are, to the connective tissue in the eyelid, or to the full thickness of the eyelid. In stage IIB, the tumor may be any size and has spread to the eye, eye socket, sinuses, tear ducts, or brain, or to the tissues that support the eye.
    More Information
    - Skin Cancer Treatment
  stage II nonmelanoma skin cancer on the head and neck (not on the eyelid): (… non-MEH-luh-NOH-muh skin KAN-ser ...)
    Pronunciation of dictionary term "stage II nonmelanoma skin cancer on the head and neck (not on the eyelid)"
    The tumor is larger than 2 centimeters but not larger than 4 centimeters.
    More Information
    - Skin Cancer Treatment
    Stage II nonmelanoma skin cancer of the head and neck. The tumor is larger than 2 centimeters but not larger than 4 centimeters.
    Stage II nonmelanoma skin cancer of the head and neck; drawing shows cancer in the epidermis and the dermis. An inset shows that the tumor is larger than 2 centimeters but not larger than 4 centimeters and that 2 centimeters is about the size of a peanut and 4 centimeters is about the size of a walnut. Also shown is the subcutaneous tissue below the dermis.
  stage II oropharyngeal cancer: (... OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage II oropharyngeal cancer"
    Cancer is larger than 2 centimeters but not larger than 4 centimeters and is found in the oropharynx only.
    More Information
    - Oropharyngeal Cancer Treatment (Adult)
  stage II ovarian borderline tumor: (… oh-VAYR-ee-un BOR-der-line TOO-mer)
    The tumor is found in one or both ovaries or fallopian tubes and has spread into other areas of the pelvis, or primary peritoneal cancer is found within the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, the tumor has spread from where it first formed to the uterus and/or the fallopian tubes and/or the ovaries. In stage IIB, the tumor has spread from the ovary or fallopian tube to organs in the peritoneal cavity (the body cavity space that contains the abdominal most of the organs in the abdomen). Also called stage II ovarian low malignant potential tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage II ovarian epithelial, fallopian tube, and primary peritoneal cancer: (... oh-VAYR-ee-un EH-pih-THEE-lee-ul fuh-LOH-pee-in ... PRY-mayr-ee PAYR-ih-toh-NEE-ul KAN-ser)
    Pronunciation of dictionary term "stage II ovarian epithelial, fallopian tube, and primary peritoneal cancer"
    Cancer is found in one or both ovaries or fallopian tubes and has spread into other areas of the pelvis, or primary peritoneal cancer is found within the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, cancer has spread from where it first formed to the uterus and/or the fallopian tubes and/or the ovaries. In stage IIB, cancer has spread from the ovary or fallopian tube to organs in the peritoneal cavity (the body cavity that contains most of the organs in the abdomen).
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
    In stage IIA, cancer is found in one or both ovaries or fallopian tubes and has spread to the uterus and/or the fallopian tubes and/or the ovaries. In stage IIB, cancer is found in one or both ovaries or fallopian tubes and has spread to organs in the peritoneal cavity, such as the colon. In primary peritoneal cancer, cancer is found in the pelvic peritoneum and has not spread there from another part of the body.
    Three-panel drawing of stage IIA, stage IIB, and stage II primary peritoneal cancer; the first panel (stage IIA) shows cancer inside both ovaries that has spread to the fallopian tube and uterus. Also shown are the cervix and vagina. The second panel (stage IIB) shows cancer inside both ovaries that has spread to the colon. The third panel (primary peritoneal cancer) shows cancer in the pelvic peritoneum.
  stage II ovarian germ cell tumor: (...oh-VAYR-ee-un jerm sel TOO-mer)
    Pronunciation of dictionary term "stage II ovarian germ cell tumor"
    Cancer is found in one or both ovaries or fallopian tubes and has spread into other areas of the pelvis, or primary peritoneal cancer is found within the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, cancer has spread from where it first formed to the uterus and/or the fallopian tubes and/or the ovaries. In stage IIB, cancer has spread from the ovary or fallopian tube to organs in the peritoneal cavity (the body cavity that contains most of the organs in the abdomen).
    More Information
    - Ovarian Germ Cell Tumors Treatment
    In stage IIA, cancer is found in one or both ovaries or fallopian tubes and has spread to the uterus and/or the fallopian tubes and/or the ovaries. In stage IIB, cancer is found in one or both ovaries or fallopian tubes and has spread to organs in the peritoneal cavity, such as the colon. In primary peritoneal cancer, cancer is found in the pelvic peritoneum and has not spread there from another part of the body.
    Three-panel drawing of stage IIA, stage IIB, and stage II primary peritoneal cancer; the first panel (stage IIA) shows cancer inside both ovaries that has spread to the fallopian tube and uterus. Also shown are the cervix and vagina. The second panel (stage IIB) shows cancer inside both ovaries that has spread to the colon. The third panel (primary peritoneal cancer) shows cancer in the pelvic peritoneum.
  stage II ovarian low malignant potential tumor: (… oh-VAYR-ee-un...muh-LIG-nunt poh-TEN-shul TOO-mer)
    Pronunciation of dictionary term "stage II ovarian low malignant potential tumor"
    The tumor is found in one or both ovaries or fallopian tubes and has spread into other areas of the pelvis, or primary peritoneal cancer is found within the pelvis. Stage II is divided into stages IIA and IIB. In stage IIA, the tumor has spread from where it first formed to the uterus and/or the fallopian tubes and/or the ovaries. In stage IIB, the tumor has spread from the ovary or fallopian tube to organs in the peritoneal cavity (the body cavity space that contains the abdominal most of the organs in the abdomen). Also called stage II ovarian borderline tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage II pancreatic cancer: (... PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "stage II pancreatic cancer"
    Stage II is divided into stages IIA and IIB, depending on the size of the tumor and where the cancer has spread. In stage IIA, the tumor is larger than 4 centimeters. In stage IIB, the tumor is any size and cancer has spread to 1 to 3 nearby lymph nodes.
    More Information
    - Pancreatic Cancer Treatment
    Stage IIA pancreatic cancer. The tumor is larger than 4 centimeters.
    Stage IIA pancreatic cancer; drawing shows cancer in the pancreas and the tumor is larger than 4 centimeters. An inset shows 4 centimeters is about the size of a walnut.
    Stage IIB pancreatic cancer. The tumor is any size and cancer has spread to 1 to 3 nearby lymph nodes.
    Stage IIB pancreatic cancer; drawing shows cancer in the pancreas and in 1 to 3 nearby lymph nodes.
  stage II papillary and follicular thyroid cancer (55 years and older): (... PA-pih-LAYR-ee ... fuh-LIH-kyoo-ler THY-royd KAN-ser ...)
    Pronunciation of dictionary term "stage II papillary and follicular thyroid cancer (55 years and older)"
    One of the following is found: (1) cancer is found in the thyroid and the tumor is 4 centimeters or smaller; cancer has spread to nearby lymph nodes; or (2) cancer is found in the thyroid, the tumor is larger than 4 centimeters, and cancer may have spread to nearby lymph nodes; or (3) the tumor is any size and cancer has spread from the thyroid to nearby muscles in the neck and may have spread to nearby lymph nodes.
    More Information
    - Thyroid Cancer Treatment
    Stage II papillary and follicular thyroid cancer (1) in patients 55 years and older. Cancer is found in the thyroid and the tumor is 4 centimeters or smaller. Cancer has spread to nearby lymph nodes.
    Stage II papillary and follicular thyroid cancer (1) in patients 55 years and older; drawing shows cancer in the thyroid gland and nearby lymph nodes. The tumor is 4 centimeters or smaller. An inset shows 4 centimeters is about the size of a walnut. Also shown are the larynx and trachea.
    Stage II papillary and follicular thyroid cancer (2) in patients 55 years and older. Cancer is found in the thyroid and the tumor is larger than 4 centimeters. Cancer may have spread to nearby lymph nodes.
    Stage II papillary and follicular thyroid cancer (2) in patients 55 years and older; drawing shows cancer in the thyroid gland and the tumor is larger than 4 centimeters. An inset shows 4 centimeters is about the size of a walnut. Also shown are the lymph nodes, larynx, and trachea.
    Stage II papillary and follicular thyroid cancer (3) in patients 55 years and older. The tumor is any size and cancer has spread from the thyroid to nearby muscles in the neck. Cancer may have spread to nearby lymph nodes.
    Stage II papillary and follicular thyroid cancer (3) in patients 55 years and older; drawing shows cancer in the thyroid gland and nearby muscles in the neck. Also shown are the larynx and trachea.
  stage II papillary and follicular thyroid cancer (younger than 55 years): (... PA-pih-LAYR-ee ... fuh-LIH-kyoo-ler THY-royd KAN-ser ...)
    Pronunciation of dictionary term "stage II papillary and follicular thyroid cancer (younger than 55 years)"
    The tumor is any size and cancer may have spread to nearby tissues and lymph nodes. Cancer has spread from the thyroid to other parts of the body, such as the lungs or bones.
    More Information
    - Thyroid Cancer Treatment
    Stage II papillary and follicular thyroid cancer in patients younger than 55 years. The tumor is any size and cancer may have spread to nearby tissues and lymph nodes. Cancer has spread from the thyroid to other parts of the body, such as the lungs or bones.
    Stage II papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid gland, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage II penile cancer: (... PEE-nile KAN-ser)
    Pronunciation of dictionary term "stage II penile cancer"
    Stage II is divided into stages IIA and IIB. In stage IIA, cancer has spread (1) to tissue just under the skin of the penis. Cancer has spread to lymph vessels, blood vessels, and/or nerves; or (2) to tissue just under the skin of the penis. Under a microscope, the cancer cells look very abnormal or the cells are sarcomatoid; or (3) into the corpus spongiosum (spongy erectile tissue in the shaft and glans that fills with blood to make an erection). In stage IIB, cancer has spread through the layer of connective tissue that surrounds the corpus cavernosum and into the corpus cavernosum (spongy erectile tissue that runs along the shaft of the penis).
    More Information
    - Penile Cancer Treatment
  stage II perihilar bile duct cancer: (... PAYR-ee-HY-ler bile dukt KAN-ser)
    Pronunciation of dictionary term "stage II perihilar bile duct cancer"
    Cancer has spread through the wall of the perihilar bile duct to nearby fatty tissue or to liver tissue.
    More Information
    - Bile Duct Cancer Stages
  stage II prostate cancer: (...PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage II prostate cancer"
    Cancer is more advanced than in stage I, but has not spread outside the prostate. Stage II is divided into stages IIA, IIB, and IIC. In stage IIA, cancer (1) is found in one-half or less of one side of the prostate. The prostate-specific antigen (PSA) level is at least 10 but lower than 20 and the Grade Group is 1 (Gleason score is 6 or less); or (2) is found in more than one-half of one side of the prostate or in both sides of the prostate. The PSA level is lower than 20 and the Grade Group is 1. In stage IIB, cancer is found in one or both sides of the prostate. The PSA level is lower than 20 and the Grade Group is 2 (Gleason score is 7). In stage IIC, cancer is found in one or both sides of the prostate. The PSA level is lower than 20 and the Grade Group is 3 or 4 (Gleason score is 7 or 8).
    More Information
    - Prostate Cancer Treatment
    Stage IIA prostate cancer. Cancer is found in the prostate only. Cancer is found in one-half or less of one side of the prostate. The prostate-specific antigen (PSA) level is at least 10 but less than 20 and the Grade Group is 1; OR cancer is found in more than one-half of one side of the prostate or in both sides of the prostate. The PSA level is less than 20 and the Grade Group is 1.
    Two-panel drawing of stage IIA prostate cancer; the top panel shows cancer in one-half or less of one side of the prostate. The PSA level is at least 10 but less than 20 and the Grade Group is 1. The bottom panel shows cancer in more than one-half of one side of the prostate. The PSA level is less than 20 and the Grade Group is 1. In both panels, the bladder, rectum, and urethra are also shown.
    Stage IIB prostate cancer. Cancer is found in the prostate only. Cancer is found in one or both sides of the prostate. The prostate-specific antigen level is less than 20 and the Grade Group is 2.
    Stage IIB prostate cancer; drawing shows cancer in one side of the prostate. The PSA level is less than 20 and the Grade Group is 2. Also shown are the bladder, rectum, and urethra.
    Stage IIC prostate cancer. Cancer is found in the prostate only. Cancer is found in one or both sides of the prostate. The prostate-specific antigen level is less than 20 and the Grade Group is 3 or 4.
    Stage IIC prostate cancer; drawing shows cancer in both sides of the prostate. The PSA level is less than 20 and the Grade Group is 3 or 4. Also shown are the bladder, rectum, and urethra.
  stage II renal cell cancer: (... REE-nul sel KAN-ser)
    Pronunciation of dictionary term "stage II renal cell cancer"
    The tumor is larger than 7 centimeters and is found in the kidney only. Also called stage II kidney cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage II kidney cancer. The tumor is larger than 7 centimeters and is found in the kidney only.
    Stage II kidney cancer; drawing shows cancer in the left kidney and the tumor is larger than 7 centimeters. An inset shows 7 centimeters is about the size of a peach. Also shown are the fatty tissue and right kidney.
  stage II salivary gland cancer: (...SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "stage II salivary gland cancer"
    The tumor is in the salivary gland only and is larger than 2 centimeters but not larger than 4 centimeters.
    More Information
    - Salivary Gland Cancer Treatment
  stage II stomach cancer: (... STUH-muk KAN-ser)
    Pronunciation of dictionary term "stage II stomach cancer"
    Stage II is divided into stages IIA and IIB. In stage IIA, cancer (1) may have spread to the submucosa (layer of connective tissue between the mucosa and the muscle layer) of the stomach wall and has spread to 3 to 6 nearby lymph nodes; or (2) has spread to the muscle layer of the stomach wall and to 1 or 2 nearby lymph nodes; or (3) has spread to the subserosa (layer of connective tissue between the muscle layer and the outermost layer called the serosa) of the stomach wall. In stage IIB, cancer (1) may have spread to the submucosa of the stomach wall and has spread to 7 to 15 nearby lymph nodes; or (2) has spread to the muscle layer of the stomach wall and to 3 to 6 nearby lymph nodes; or (3) has spread to the subserosa of the stomach wall and to 1 or 2 nearby lymph nodes; or (4) has spread to the serosa of the stomach wall. Also called stage II gastric cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage II testicular cancer: (...tes-TIH-kyoo-ler KAN-ser)
    Pronunciation of dictionary term "stage II testicular cancer"
    Stage II is divided into stages IIA, IIB, and IIC. In stage IIA, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread to 1 to 5 nearby lymph nodes and the lymph nodes are 2 centimeters or smaller. All tumor marker levels are normal or slightly above normal. In stage IIB, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread to (1) one nearby lymph node and the lymph node is larger than 2 centimeters but not larger than 5 centimeters; or (2) more than 5 nearby lymph nodes and the lymph nodes are not larger than 5 centimeters; or (3) a nearby lymph node and the cancer has spread outside the lymph node. All tumor marker levels are normal or slightly above normal. In stage IIC, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread to a nearby lymph node and the lymph node is larger than 5 centimeters. All tumor marker levels are normal or slightly above normal.
    More Information
    - Testicular Cancer Treatment
  stage II thymoma: (... thy-MOH-muh)
    Pronunciation of dictionary term "stage II thymoma"
    Cancer has spread through the capsule (sac) that surrounds the thymus and into the fat around the thymus or into the lining of the chest cavity.
    More Information
    - Thymoma and Thymic Carcinoma Treatment
  stage II transitional cell cancer of the renal pelvis and ureter: (... tran-ZIH-shuh-nul sel KAN-ser ... REE-nul PEL-vus ... YER-eh-ter)
    Pronunciation of dictionary term "stage II transitional cell cancer of the renal pelvis and ureter"
    Cancer has spread to the muscle layer of the renal pelvis or ureter.
    More Information
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
  stage II uterine sarcoma: (…YOO-teh-rin sar-KOH-muh)
    Pronunciation of dictionary term "stage II uterine sarcoma"
    Cancer has spread into connective tissue of the cervix, but has not spread outside the uterus.
    More Information
    - Uterine Sarcoma Treatment
  stage II vaginal cancer: (...VA-jih-nul KAN-ser)
    Pronunciation of dictionary term "stage II vaginal cancer"
    Cancer has spread through the wall of the vagina to the tissue around the vagina. Cancer has not spread to the wall of the pelvis.
    More Information
    - Vaginal Cancer Treatment
  stage II vulvar cancer: (... VUL-ver KAN-ser)
    Pronunciation of dictionary term "stage II vulvar cancer"
    The tumor is any size and has spread to the lower one-third of the urethra, the lower one-third of the vagina, or the lower one-third of the anus. Cancer has not spread to the lymph nodes.
    More Information
    - Vulvar Cancer Treatment
  stage II Wilms tumor: (… wilmz TOO-mer)
    Pronunciation of dictionary term "stage II Wilms tumor"
    The tumor was completely removed by surgery and no cancer cells were found at the edges of the area where the tumor was removed. Cancer has not spread to lymph nodes. Before the tumor was removed, one of the following was true: (1) cancer had spread to the renal sinus (the part of the kidney where it joins the ureter); or (2) cancer had spread to blood vessels outside the area of the kidney where urine is made, such as the renal sinus.
    More Information
    - Wilms Tumor and Other Childhood Kidney Tumors Treatment
  stage IIA breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IIA breast cancer"
    Stage II is divided into stages IIA and IIB. In stage IIA, (1) no tumor is found in the breast or the tumor is 2 centimeters or smaller. Cancer (larger than 2 millimeters) is found in 1 to 3 axillary lymph nodes or in the lymph nodes near the breastbone (found during a sentinel lymph node biopsy); or (2) the tumor is larger than 2 centimeters but not larger than 5 centimeters. Cancer has not spread to the lymph nodes.
    More Information
    - Breast Cancer Treatment
    Stage IIA breast cancer. No tumor is found in the breast and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (left panel); OR the tumor is 2 centimeters or smaller and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (middle panel); OR the tumor is larger than 2 centimeters but not larger than 5 centimeters and has not spread to the lymph nodes (right panel).
    Stage IIA breast cancer. Drawing on the left shows no tumor in the breast, but cancer is found in 3 axillary lymph nodes. Drawing in the middle shows the tumor size is 2 cm or smaller and cancer is found in 3 axillary lymph nodes. Drawing on the right shows the tumor is larger than 2 cm but not larger than 5 cm and has not spread to the lymph nodes.
  stage IIA esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIA esophageal adenocarcinoma"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread. In stage IIA, cancer has spread into the muscle layer of the esophagus wall. The cancer cells are grade 3. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 and 2 cancer cells.
    More Information
    - Esophageal Cancer Treatment
    Stage IIA adenocarcinoma of the esophagus. Cancer has spread into the muscle layer of the esophagus wall. The cancer cells are grade 3. Grade 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 or 2 cancer cells.
    Stage IIA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer in the mucosa, submucosa, and muscle layers of the esophagus wall. Also shown is the connective tissue layer of the esophagus wall and lymph nodes.
  stage IIA esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIA esophageal squamous cell carcinoma"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread. In stage IIA, cancer has spread (1) into the muscle layer or the connective tissue layer of the esophagus wall, and the cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2 and 3 cancer cells. The tumor is in either the upper or middle esophagus; or (2) into the muscle layer or the connective tissue layer of the esophagus wall, and the cancer cells are grade 2 and 3. Grade 2 and 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells. The tumor is in the lower esophagus or it is not known where the tumor is.
    More Information
    - Esophageal Cancer Treatment
    Stage IIA squamous cell cancer of the esophagus (1). The tumor is in either the upper or middle esophagus. Cancer has spread into the muscle layer or the connective tissue layer of the esophagus wall. The cancer cells are grade 1. Grade 1 cancer cells look more like normal cells under a microscope and grow and spread more slowly than grade 2-3 cancer cells.
    Stage IIA squamous cell cancer of the esophagus (1); drawing shows the esophagus and stomach. An inset shows the layers of the esophagus wall with cancer in the mucosa, submucosa, muscle, and connective tissue layers. Also shown are lymph nodes.
    Stage IIA squamous cell cancer of the esophagus (2). The tumor is in the lower esophagus or it is not known where the tumor is. Cancer has spread into the muscle layer or the connective tissue layer of the esophagus wall. The cancer cells are grade 2-3. Grade 2-3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells.
    Stage IIA squamous cell cancer of the esophagus (2); drawing shows the esophagus and stomach. An inset shows the layers of the esophagus wall with cancer in the mucosa, submucosa, muscle, and connective tissue layers. Also shown are lymph nodes.
  stage IIA intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage IIA intraocular melanoma of the ciliary body and choroid"
    Stage II is divided into stages IIA and IIB. In stage IIA, the tumor (1) is size category 1 (not more than 12 millimeters wide and not more than 3 millimeters thick; or not more than 9 millimeters wide and 3.1 to 6 millimeters thick) and has spread to the ciliary body; or (2) is size category 1 and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. The tumor may have spread to the ciliary body; or (3) is size category 2 (12.1 to 18 millimeters wide and not more than 3 millimeters thick; or 9.1 to 15 millimeters wide and 3.1 to 6 millimeters thick; or not more than 12 millimeters wide and 6.1 to 9 millimeters thick) and is in the choroid only.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IIA non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IIA non-small cell lung cancer"
    Stage II non-small cell lung cancer is divided into stages IIA and IIB. In stage IIA, the tumor is larger than 4 centimeters but not larger than 5 centimeters. Cancer has not spread to the lymph nodes and one or more of the following may be found: (1) cancer has spread to the main bronchus, but has not spread to the carina; and/or (2) cancer has spread to the innermost layer of the membrane that covers the lung; and/or (3) part of the lung or the whole lung has collapsed or has developed pneumonitis.
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IIA lung cancer. The tumor is larger than 4 centimeters but not larger than 5 centimeters. Cancer has not spread to the lymph nodes and one or more of the following may be found: (a) cancer has spread to the main bronchus, but has not spread to the carina; and/or (b) cancer has spread to the inner membrane that covers the lung; and/or (c) part of the lung or the whole lung has collapsed or has pneumonitis (inflammation of the lung).
    Stage IIA lung cancer; drawing shows a primary tumor (larger than 4 cm but not larger than 5 cm) in the left lung and cancer in (a) the left main bronchus and (b) the inner membrane covering the lung (inset). Also shown is (c) part or all of the lung has collapsed or has pneumonitis (inflammation). The carina, pleura, and a rib (inset) are also shown.
  stage IIA soft tissue sarcoma: (...TIH-shoo sar-KOH-muh)
    Pronunciation of dictionary term "stage IIA soft tissue sarcoma"
    Stage II is divided into stages IIA and IIB. In stage IIA, the tumor is mid-grade (somewhat likely to grow and spread quickly) or high-grade (likely to grow and spread quickly) and 5 centimeters or smaller. It may be either superficial (in subcutaneous tissue with no spread into connective tissue or muscle below) or deep (in the muscle and may be in connective or subcutaneous tissue).
  stage IIB breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IIB breast cancer"
    Stage II is divided into stages IIA and IIB. In stage IIB, the tumor is (1) larger than 2 centimeters but not larger than 5 centimeters. Small clusters of breast cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes; or (2) larger than 2 centimeters but not larger than 5 centimeters. Cancer has spread to 1 to 3 axillary lymph nodes or to the lymph nodes near the breastbone (found during a sentinel lymph node biopsy); or (3) larger than 5 centimeters. Cancer has not spread to the lymph nodes.
    More Information
    - Breast Cancer Treatment
    Stage IIB breast cancer. The tumor is larger than 2 centimeters but not larger than 5 centimeters and small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes (left panel); OR the tumor is larger than 2 centimeters but not larger than 5 centimeters and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (middle panel); OR the tumor is larger than 5 centimeters and has not spread to the lymph nodes (right panel).
    Stage IIB breast cancer. The drawing on the left shows the tumor is larger than 2 cm but not larger than 5 cm and small clusters of cancer cells are in the lymph nodes. The drawing in the middle shows the tumor is larger than 2 cm but not larger than 5 cm and cancer is in 3 axillary lymph nodes. The drawing on the right shows the tumor is larger than 5 cm but has not spread to the lymph nodes.
  stage IIB esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIB esophageal adenocarcinoma"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread. In stage IIB, cancer (1) has spread into the connective tissue layer of the esophagus wall; or (2) is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall. Cancer is found in 1 or 2 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIB adenocarcinoma of the esophagus. Cancer has spread into the connective tissue layer of the esophagus wall; OR cancer is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall, and cancer is found in 1 or 2 lymph nodes near the tumor.
    Stage IIB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa, submucosa, muscle, and connective tissue layers. The left panel shows cancer in the mucosa, submucosa, muscle, and connective tissue layers. The right panel shows cancer in the mucosa, submucosa, and muscle layers and in 1 lymph node.
  stage IIB esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIB esophageal squamous cell carcinoma"
    Stage II is divided into stages IIA and IIB, depending on where the cancer has spread. In stage IIB, cancer (1) has spread into the muscle layer or the connective tissue layer of the esophagus wall, and the cancer cells are grade 2 and 3. Grade 2 and 3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells. The tumor is in either the upper or middle esophagus; or (2) is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall. Cancer is found in 1 or 2 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIB squamous cell cancer of the esophagus. The tumor is in either the upper or middle esophagus. Cancer has spread into the muscle layer or the connective tissue layer of the esophagus wall, and the cancer cells are grade 2-3; OR cancer is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall, and cancer is found in 1 or 2 lymph nodes near the tumor. Grade 2-3 cancer cells look more abnormal under a microscope and grow and spread more quickly than grade 1 cancer cells.
    Stage IIB squamous cell cancer of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa, submucosa, muscle, and connective tissue layers. The left panel shows cancer in the mucosa, submucosa, muscle, and connective tissue layers. The right panel shows cancer in the mucosa, submucosa, and muscle layers and in 1 lymph node.
  stage IIB intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage IIB intraocular melanoma of the ciliary body and choroid"
    Stage II is divided into stages IIA and IIB. In stage IIB, the tumor (1) is size category 2 (12.1 to 18 millimeters wide and not more than 3 millimeters thick; or 9.1 to 15 millimeters wide and 3.1 to 6 millimeters thick; or not more than 12 millimeters wide and 6.1 to 9 millimeters thick) and has spread to the ciliary body; or (2) is size category 3 (15.1 to 18 millimeters wide and 3.1 to 6 millimeters thick; or 12.1 to 18 millimeters wide and 6.1 to 9 millimeters thick; or not more than 18 millimeters wide and 9.1 to 12 millimeters thick; or not more than 15 millimeters wide and 12.1 to 15 millimeters thick) and is in the choroid only.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IIB non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IIB non-small cell lung cancer"
    Stage II non-small cell lung cancer is divided into stages IIA and IIB. In stage IIB, the tumor is 5 centimeters or smaller and cancer has spread to the lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are in the lung or near the bronchus. Also, one or more of the following may be found: (1) cancer has spread to the main bronchus, but has not spread to the carina; and/or (2) cancer has spread to the innermost layer of the membrane that covers the lung; and/or (3) part of the lung or the whole lung has collapsed or has developed pneumonitis; OR cancer has not spread to lymph nodes and one or more of the following is found: (1) the tumor is larger than 5 centimeters but not larger than 7 centimeters; and/or (2) there are one or more separate tumors in the same lobe of the lung as the primary tumor; and/or (3) cancer has spread to any of the following: the membrane that lines the inside of the chest wall, the chest wall, the nerve that controls the diaphragm, and/or the outer layer of tissue of the sac around the heart.
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IIB lung cancer (1). The primary tumor is 5 centimeters or smaller and cancer has spread to the lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are in the lung or near the bronchus.
    Stage IIB lung cancer (1); drawing shows a primary tumor (5 cm or smaller) in the right lung and cancer in lymph nodes in the same lung as the primary tumor. Also shown are the trachea, main bronchus, pleura, and diaphragm.
    Stage IIB lung cancer (2). Cancer has not spread to lymph nodes and one or more of the following is found: (a) the primary tumor is larger than 5 centimeters but not larger than 7 centimeters; and/or (b) there are one or more separate tumors in the same lobe of the lung as the primary tumor; and/or cancer has spread to any of the following: (c) the chest wall and/or the membrane that lines the inside of the chest wall, (d) the nerve that controls the diaphragm, and/or (e) the outer layer of tissue of the sac around the heart.
    Stage IIB lung cancer (2); drawing shows (a) a primary tumor (larger than 5 cm but not larger than 7 cm) in the left lung (top inset) and (b) a separate tumor in the same lobe of the lung as the primary tumor. Also shown is cancer that has spread to (c) the chest wall and the membranes covering the lung and chest wall (middle inset); (d) the nerve that controls the diaphragm; and (e) the sac around the heart (bottom inset). The pleura, diaphragm, heart, and a rib (middle inset) are also shown.
  stage IIB soft tissue sarcoma: (...TIH-shoo sar-KOH-muh)
    Pronunciation of dictionary term "stage IIB soft tissue sarcoma"
    Stage II is divided into stages IIA and IIB. In stage IIB, the tumor is mid-grade (somewhat likely to grow and spread quickly) and larger than 5 centimeters. It may be either superficial (in subcutaneous tissue with no spread into connective tissue or muscle below) or deep (in the muscle and may be in connective or subcutaneous tissue).
  stage III adenosarcoma of the uterus: (... A-deh-noh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage III adenosarcoma of the uterus"
    The tumor has spread into tissues in the abdomen. Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, the tumor has spread to one site in the abdomen. In stage IIIB, the tumor has spread to more than one site in the abdomen. In stage IIIC, the tumor has spread to lymph nodes in the pelvis and/or around the abdominal aorta (the largest blood vessel in the abdomen).
    More Information
    - Uterine Sarcoma Treatment
  stage III adrenocortical cancer: (... uh-DREE-noh-KOR-tih-kul KAN-ser)
    Pronunciation of dictionary term "stage III adrenocortical cancer"
    The tumor is any size and has spread to (1) nearby lymph nodes; or (2) nearby tissues, organs (kidney, diaphragm, pancreas, spleen, or liver), or large blood vessels (renal vein or vena cava) and may have spread to nearby lymph nodes.
    More Information
    - Adrenocortical Carcinoma Treatment
  stage III adult Hodgkin lymphoma: (... uh-dult HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage III adult Hodgkin lymphoma"
    Cancer is found (1) in groups of lymph nodes both above and below the diaphragm; or (2) in lymph nodes above the diaphragm and in the spleen.
    More Information
    - Hodgkin Lymphoma Treatment
    Stage III adult lymphoma. Cancer is found in groups of lymph nodes both above and below the diaphragm; or in a group of lymph nodes above the diaphragm and in the spleen.
    Stage III adult lymphoma; drawing shows the right and left sides of the body. The right side of the body shows cancer in a group of lymph nodes above the diaphragm and below the diaphragm. The left side of the body shows cancer in a group of lymph nodes above the diaphragm and cancer in the spleen.
  stage III adult non-Hodgkin lymphoma: (... uh-dult non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage III adult non-Hodgkin lymphoma"
    Cancer is found (1) in groups of lymph nodes both above and below the diaphragm; or (2) in lymph nodes above the diaphragm and in the spleen.
    More Information
    - Non-Hodgkin Lymphoma Treatment
    Stage III adult lymphoma. Cancer is found in groups of lymph nodes both above and below the diaphragm; or in a group of lymph nodes above the diaphragm and in the spleen.
    Stage III adult lymphoma; drawing shows the right and left sides of the body. The right side of the body shows cancer in a group of lymph nodes above the diaphragm and below the diaphragm. The left side of the body shows cancer in a group of lymph nodes above the diaphragm and cancer in the spleen.
  stage III adult soft tissue sarcoma of the retroperitoneum: (… uh-DULT ... TIH-shoo sar-KOH-muh ... REH-troh-PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "stage III adult soft tissue sarcoma of the retroperitoneum"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, the tumor is larger than 5 centimeters but not larger than 10 centimeters and is mid grade or high grade. Mid-grade and high-grade cancer cells look more abnormal under a microscope and grow and spread more quickly than low-grade cancer cells. In stage IIIB, the tumor is (1) larger than 10 centimeters and is mid grade or high grade; or (2) any size, any grade, and has spread to nearby lymph nodes.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage III adult soft tissue sarcoma of the trunk, arms, and legs: (... uh-DULT ... TIH-shoo sar-KOH-muh ...)
    Pronunciation of dictionary term "stage III soft tissue sarcoma of the trunk, arms, and legs"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, the tumor is larger than 5 centimeters but not larger than 10 centimeters and is mid grade or high grade. Mid-grade and high-grade cancer cells look more abnormal under a microscope and grow and spread more quickly than low-grade cancer cells. In stage IIIB, the tumor is larger than 10 centimeters and is mid grade or high grade.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage III AIDS-related lymphoma: (... ree-LAY-ted lim-FOH-muh)
    Pronunciation of dictionary term "stage III AIDS-related lymphoma"
    Cancer is found (1) in groups of lymph nodes both above and below the diaphragm; or (2) in lymph nodes above the diaphragm and in the spleen.
    More Information
    - AIDS-Related Lymphoma Treatment
    Stage III adult lymphoma. Cancer is found in groups of lymph nodes both above and below the diaphragm; or in a group of lymph nodes above the diaphragm and in the spleen.
    Stage III adult lymphoma; drawing shows the right and left sides of the body. The right side of the body shows cancer in a group of lymph nodes above the diaphragm and below the diaphragm. The left side of the body shows cancer in a group of lymph nodes above the diaphragm and cancer in the spleen.
  stage III anal cancer: (... AY-nul KAN-ser)
    Pronunciation of dictionary term "stage III anal cancer"
    Stage III anal cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, the tumor is 5 centimeters or smaller and has spread to lymph nodes near the anus or groin. In stage IIIB, the tumor is any size and has spread to nearby organs, such as the vagina, urethra, or bladder. Cancer has not spread to lymph nodes. In stage IIIC, the tumor is any size and may have spread to nearby organs. Cancer has spread to lymph nodes near the anus or groin.
    More Information
    - Anal Cancer Treatment
  stage III bladder cancer: (... BLA-der KAN-ser)
    Pronunciation of dictionary term "stage III bladder cancer"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, cancer (1) has grown all the way through the bladder muscles and bladder wall into the layer of fat surrounding the bladder and may have spread to the reproductive organs (prostate, seminal vesicles, uterus, or vagina) but has not spread to lymph nodes; or (2) has spread to one lymph node in the pelvis that is not near the major arteries in the pelvis, called the common iliac arteries. In stage IIIB, cancer has spread to more than one lymph node in the pelvis that is not near the common iliac arteries or to at least one lymph node that is near the common iliac arteries.
    More Information
    - Bladder Cancer Stages
    Stage IIIA bladder cancer. Cancer (a) has grown all the way through the bladder muscles and bladder wall into the layer of fat around the bladder and may have spread to the prostate and/or seminal vesicles in men or the uterus and/or vagina in women but has not spread to lymph nodes; or (b) has spread to one lymph node in the pelvis that is not near the common iliac arteries.
    Two-panel drawing showing stage IIIA bladder cancer in a male (left panel) and a female (right panel); both panels show cancer in the bladder and in (a) the layer of fat around the bladder and (b) one lymph node in the pelvis. Also shown are the right and left common iliac arteries, the prostate (left panel), and the uterus (right panel).
    Stage IIIB bladder cancer. Cancer has spread to (a) more than one lymph node in the pelvis that is not near the common iliac arteries; or (b) at least one lymph node that is near the common iliac arteries.
    Two-panel drawing showing stage IIIB bladder cancer in a male (left panel) and a female (right panel); both panels show cancer in the bladder and in (a) more than one lymph node in the pelvis that is not near the common iliac artery and (b) one lymph node near the common iliac artery. Also shown are the right and left common iliac arteries, the prostate (left panel), and the uterus (the right panel).
  stage III breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage III breast cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, (1) no tumor is found in the breast or the tumor may be any size. Cancer is found in 4 to 9 axillary lymph nodes or in the lymph nodes near the breastbone (found during imaging tests or a physical exam); or (2) the tumor is larger than 5 centimeters. Small clusters of breast cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes; or (3) the tumor is larger than 5 centimeters. Cancer has spread to 1 to 3 axillary lymph nodes or to the lymph nodes near the breastbone (found during a sentinel lymph node biopsy). In stage IIIB, the tumor may be any size and cancer has spread to the chest wall and/or to the skin of the breast and caused swelling or an ulcer. Also, cancer may have spread to: (1) up to 9 axillary lymph nodes; or (2) the lymph nodes near the breastbone. Cancer that has spread to the skin of the breast may also be inflammatory breast cancer. In stage IIIC, no tumor is found in the breast or the tumor may be any size. Cancer may have spread to the skin of the breast and caused swelling or an ulcer and/or has spread to the chest wall. Also, cancer has spread to: (1) 10 or more axillary lymph nodes; or (2) lymph nodes above or below the collarbone; or (3) axillary lymph nodes and lymph nodes near the breastbone. Cancer that has spread to the skin of the breast may also be inflammatory breast cancer. For treatment, stage IIIC breast cancer is divided into operable and inoperable stage IIIC.
    More Information
    - Breast Cancer Treatment
    Stage IIIA breast cancer. No tumor is found in the breast or the tumor may be any size and cancer is found in 4 to 9 axillary lymph nodes or lymph nodes near the breastbone (left panel); OR the tumor is larger than 5 centimeters and small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes (middle panel); OR the tumor is larger than 5 centimeters and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (right panel).
    Stage IIIA breast cancer. The drawing on the left shows no tumor in the breast; cancer is found in 8 axillary lymph nodes. The drawing in the middle shows the tumor is larger than 5 cm and small clusters of cancer cells are in the lymph nodes. The drawing on the right shows the tumor is larger than 5 cm and cancer is in 3 axillary lymph nodes.
    Stage IIIB breast cancer. The tumor may be any size and cancer has spread to the chest wall and/or to the skin of the breast and caused swelling or an ulcer. Cancer may have spread to up to 9 axillary lymph nodes or the lymph nodes near the breastbone. Cancer that has spread to the skin of the breast may be inflammatory breast cancer.
    Stage IIIB breast cancer. The drawing on the left is a cross section of the breast showing that cancer has spread to the chest wall. The ribs, muscle, and fatty tissue are also shown. The drawing on the right shows the tumor has spread to the skin of the breast. An inset shows inflammatory breast cancer.
    Stage IIIC breast cancer. No tumor is found in the breast or the tumor may be any size and may have spread to the chest wall and/or to the skin of the breast and caused swelling or an ulcer. Also, cancer has spread to 10 or more axillary lymph nodes (left panel); OR to lymph nodes above or below the collarbone (middle panel); OR to axillary lymph nodes and lymph nodes near the breastbone (right panel). Cancer that has spread to the skin of the breast may be inflammatory breast cancer.
    Stage IIIC breast cancer. The drawing on the left shows cancer in lymph nodes in the axilla. The drawing in the middle shows cancer in lymph nodes above the collarbone. The drawing on the right shows cancer in lymph nodes in the axilla and in lymph nodes near the breastbone.
  stage III cancer of the uterus: (... KAN-ser ... YOO-ter-us)
    Pronunciation of dictionary term "stage III cancer of the uterus"
    Cancer cells have spread outside the uterus to the vagina and/or lymph nodes in the pelvis but have not spread outside the pelvis.
  stage III cervical cancer: (... SER-vih-kul KAN-ser)
    Pronunciation of dictionary term "stage III cervical cancer"
    Cancer has spread to the lower third of the vagina, and/or to the pelvic wall, and/or has caused kidney problems, and/or involves lymph nodes. Stage III is divided into stages IIIA, IIIB, and IIIC, based on how far the cancer has spread. In stage IIIA, cancer has spread to the lower third of the vagina but has not spread to the pelvic wall. In stage IIIB, cancer has spread to the pelvic wall and/or the tumor has become large enough to block one or both ureters (tubes that connect the kidneys to the bladder) or has caused one or both kidneys to get bigger or stop working. Stage IIIC is divided into stages IIIC1 and IIIC2, based on the spread of cancer to the lymph nodes. In stage IIIC1, cancer has spread to lymph nodes in the pelvis. In stage IIIC2, cancer has spread to lymph nodes in the abdomen near the aorta.
    More Information
    - Cervical Cancer Stages
    Stage IIIA cervical cancer. Cancer has spread to the lower third of the vagina but has not spread to the pelvic wall.
    Stage IIIA cervical cancer; drawing shows a cross-section of the cervix and vagina. Cancer is shown in the cervix and in the full length of the vagina.
    Stage IIIB cervical cancer. Cancer has spread to the pelvic wall and/or the tumor has become large enough to block one or both ureters or has caused one or both kidneys to get bigger or stop working.
    Stage IIIB cervical cancer; drawing shows cancer in the cervix and pelvic wall. Also shown is cancer blocking the right ureter and an enlarged right ureter and right kidney. The uterus, bladder, and vagina are also shown.
    Stage IIIC cervical cancer. In stage IIIC1, cancer has spread to lymph nodes in the pelvis. In stage IIIC2, cancer has spread to lymph nodes in the abdomen near the aorta.
    Stage IIIC cervical cancer; drawing shows stage IIIC1 cancer that has spread from the cervix to lymph nodes in the pelvis and stage IIIC2 cancer that has spread from the cervix to lymph nodes in the abdomen near the aorta.
  stage III childhood Hodgkin lymphoma: (...HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage III childhood Hodgkin lymphoma"
    Cancer is found (1) in lymph node groups above and below the diaphragm (the thin muscle below the lungs that helps breathing and separates the chest from the abdomen); or (2) in lymph node groups above the diaphragm and in the spleen.
    More Information
    - Childhood Hodgkin Lymphoma Treatment
    Stage III childhood Hodgkin lymphoma. Cancer is found (a) in lymph node groups above and below the diaphragm; or (b) in lymph node groups above the diaphragm and in the spleen.
    Stage III childhood Hodgkin lymphoma; drawing shows (a) cancer in lymph node groups above and below the diaphragm. Also shown is (b) cancer in a lymph node group above the diaphragm and cancer in the spleen. The lungs are also shown. An inset shows a close-up of a lymph node with a lymph vessel, an artery, and a vein. Cancer cells are shown inside the lymph node.
  stage III childhood liver cancer: (... LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage III childhood liver cancer"
    The tumor cannot be removed by surgery; or cancer that can be seen without a microscope remains after surgery; or the cancer has spread to nearby lymph nodes.
  stage III childhood non-Hodgkin lymphoma: (... non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage III childhood non-Hodgkin lymphoma"
    Cancer is found (1) in at least one area above the diaphragm (the thin muscle below the lungs and heart that separates the chest from the abdomen) and in at least one area below the diaphragm; or (2) to have started in the chest; or (3) to have started in the abdomen and spread throughout the abdomen and cannot be completely removed by surgery; or (4) in the area around the spine.
    More Information
    - Childhood Non-Hodgkin Lymphoma Treatment
    Stage III childhood non-Hodgkin lymphoma. Cancer is found in at least one area above and below the diaphragm (a); or cancer started in the chest (b); or cancer started in the abdomen and spread throughout the abdomen (c); or in the area around the spine (not shown).
    Stage III childhood non-Hodgkin lymphoma; drawing shows cancer in lymph node groups above and below the diaphragm, in the chest, and throughout the abdomen in the liver, spleen, small intestines, and appendix. The colon is also shown. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Lymphoma cells containing cancer are shown in the lymph node.
  stage III chronic lymphocytic leukemia: (… KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "stage III chronic lymphocytic leukemia"
    There are too many lymphocytes in the blood and there are too few red blood cells. The lymph nodes, liver, or spleen may be larger than normal.
    More Information
    - Chronic Lymphocytic Leukemia Treatment
  stage III cutaneous T-cell lymphoma: (... kyoo-TAY-nee-us T-sel lim-FOH-muh)
    Pronunciation of dictionary term "stage III cutaneous T-cell lymphoma"
    Nearly all of the skin is red, dry, and scaly; lymph nodes are either normal or enlarged but do not contain cancer cells.
  stage III distal bile duct cancer: (... DIS-tul bile dukt KAN-ser)
    Pronunciation of dictionary term "stage III distal bile duct cancer"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, cancer has spread into the wall of the distal bile duct and to 4 or more nearby lymph nodes. In stage IIIB, cancer has spread to the large vessels that carry blood to the organs in the abdomen. Cancer may have spread to 1 or more nearby lymph nodes.
    More Information
    - Bile Duct Cancer Stages
  stage III endometrial cancer: (... EN-doh-MEE-tree-ul KAN-ser)
    Pronunciation of dictionary term "stage III endometrial cancer"
    Cancer has spread beyond the uterus and cervix, but has not spread beyond the pelvis. Stage III is divided into stages IIIA, IIIB, and IIIC, based on how far the cancer has spread within the pelvis. In stage IIIA, cancer has spread to the outer layer of the uterus and/or to the fallopian tubes, ovaries, and ligaments of the uterus. In stage IIIB, cancer has spread to the vagina and/or to the parametrium (connective tissue and fat around the uterus). In stage IIIC, cancer has spread to lymph nodes in the pelvis and/or around the aorta (largest artery in the body, which carries blood away from the heart).
    More Information
    - Endometrial Cancer Treatment
    Stage IIIA endometrial cancer. Cancer has spread to the outer layer of the uterus and/or to the fallopian tubes, ovaries, or ligaments of the uterus.
    Stage IIIA endometrial cancer shown in a cross-section drawing of the uterus, ligaments of the uterus, cervix, fallopian tubes, ovaries, and vagina. Cancer is shown in the endometrium of the uterus, the outer layer of the uterus, a fallopian tube, an ovary, and a ligament of the uterus.
    Stage IIIB endometrial cancer. Cancer has spread to the vagina and/or to the parametrium (connective tissue and fat around the uterus and cervix).
    Stage IIIB endometrial cancer shown in a cross-section drawing of the uterus, cervix, fallopian tubes, ovaries, and vagina. Cancer is shown in the endometrium of the uterus, the parametrium, the cervix, and the vagina.
    Stage IIIC endometrial cancer. Cancer has spread to lymph nodes in the pelvis and/or around the aorta (the largest artery in the body that carries blood away from the heart).
    Stage IIIC endometrial cancer; drawing shows cancer in the endometrium and myometrium of the uterus. Also shown is cancer in lymph nodes in the pelvis and near the aorta.
  stage III endometrial stromal sarcoma: (... EN-doh-MEE-tree-ul STROH-mul sar-KOH-muh)
    Pronunciation of dictionary term "stage III endometrial stromal sarcoma"
    The tumor has spread into tissues in the abdomen. Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, the tumor has spread to one site in the abdomen. In stage IIIB, the tumor has spread to more than one site in the abdomen. In stage IIIC, the tumor has spread to lymph nodes in the pelvis and/or around the abdominal aorta (the largest blood vessel in the abdomen).
    More Information
    - Uterine Sarcoma Treatment
  stage III esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage III esophageal adenocarcinoma"
    Stage III is divided into stages IIIA and IIIB, depending on where the cancer has spread. In stage IIIA, cancer has spread (1) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor; or (2) into the thick muscle layer of the esophagus wall. Cancer is found in 1 or 2 lymph nodes near the tumor. In stage IIIB, cancer has spread (1) into the thick muscle layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor; or (2) into the connective tissue layer of the esophagus wall. Cancer is found in 1 to 6 lymph nodes near the tumor; or (3) into the diaphragm, pleura, sac around the heart, azygos vein, or peritoneum. Cancer may be found in 0 to 2 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIA adenocarcinoma of the esophagus. Cancer has spread into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor; OR cancer has spread into the thick muscle layer of the esophagus wall. Cancer is found in 1 to 2 lymph nodes near the tumor.
    Stage IIIA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, and submucosa layer and in 3 lymph nodes near the tumor. The right panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer and in 1 lymph node near the tumor.
    Stage IIIB adenocarcinoma of the esophagus (1). Cancer has spread into the thick muscle layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor; OR cancer has spread into the connective tissue layer of the esophagus wall. Cancer is found in 1 to 6 lymph nodes near the tumor.
    Stage IIIB adenocarcinoma of the esophagus (1); drawing shows the esophagus and stomach. An inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer and in 3 lymph nodes near the tumor. The right panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer and in 4 lymph nodes near the tumor.
    Stage IIIB adenocarcinoma of the esophagus (2). Cancer has spread into the (a) diaphragm, (b) azygos vein, (c) pleura, (d) sac around the heart, or peritoneum (not shown). Cancer may be found in 0 to 2 lymph nodes near the tumor.
    Stage IIIB adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown are the airway, lung, aorta, chest wall, heart, and rib.
  stage III esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage III esophageal squamous cell carcinoma"
    Stage III is divided into stages IIIA and IIIB, depending on where the cancer has spread. In stage IIIA, cancer has spread (1) into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor; or (2) into the thick muscle layer of the esophagus wall. Cancer is found in 1 or 2 lymph nodes near the tumor. In stage IIIB, cancer has spread (1) into the thick muscle layer or the connective tissue layer of the esophagus wall. Cancer is found in 1 to 6 lymph nodes near the tumor; or (2) into the diaphragm, pleura, sac around the heart, azygos vein, or peritoneum. Cancer may be found in 0 to 2 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIA squamous cell carcinoma of the esophagus. Cancer has spread into the mucosa layer, thin muscle layer, or submucosa layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor; OR cancer has spread into the thick muscle layer of the esophagus wall. Cancer is found in 1 to 2 lymph nodes near the tumor.
    Stage IIIA squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, and submucosa layer and in 3 lymph nodes near the tumor. The right panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer and in 1 lymph node near the tumor.
    Stage IIIB squamous cell carcinoma of the esophagus (1). Cancer has spread into the thick muscle layer or the connective tissue layer of the esophagus wall. Cancer is found in 1 to 6 lymph nodes near the tumor.
    Stage IIIB squamous cell carcinoma of the esophagus (1); drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall and in 4 lymph nodes near the tumor.
    Stage IIIB squamous cell carcinoma of the esophagus (2). Cancer has spread into the (a) diaphragm, (b) azygos vein, (c) pleura, (d) sac around the heart, or peritoneum (not shown). Cancer may be found in 0 to 2 lymph nodes near the tumor.
    Stage IIIB squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown are the airway, lung, aorta, chest wall, heart, and rib.
  stage III gallbladder cancer: (... GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "stage III gallbladder cancer"
    Stage III is divided into stages IIIA and IIIB, depending on where the cancer has spread. In stage IIIA, cancer has spread through the connective tissue layer of the gallbladder wall to (1) the serosa (layer of tissue that covers the gallbladder); and/or (2) the liver; and/or (3) one nearby organ or structure (such as the stomach, small intestine, colon, pancreas, or the bile ducts outside the liver). In stage IIIB, cancer has formed in the mucosa (innermost layer) of the gallbladder wall and may have spread to the muscle, connective tissue, or serosa and may have also spread to the liver or to one nearby organ or structure (such as the stomach, small intestine, colon, pancreas, or the bile ducts outside the liver). Cancer has spread to one to three nearby lymph nodes.
    More Information
    - Gallbladder Cancer Treatment
  stage III gastric cancer: (... GAS-trik KAN-ser)
    Pronunciation of dictionary term "stage III gastric cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, cancer (1) has spread to the muscle layer of the stomach wall and to 7 to 15 nearby lymph nodes; or (2) has spread to the subserosa (layer of connective tissue between the muscle layer and the outermost layer called the serosa) of the stomach wall and to 3 to 6 nearby lymph nodes; or (3) has spread to the serosa of the stomach wall and to 1 to 6 nearby lymph nodes; or (4) has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. In stage IIIB, cancer (1) may have spread to the submucosa (layer of connective tissue between the mucosa and the muscle layer) or to the muscle layer of the stomach wall and has spread to 16 or more nearby lymph nodes; or (2) has spread to the subserosa or to the serosa of the stomach wall and to 7 to 15 nearby lymph nodes; or (3) has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. Cancer has also spread to 1 to 6 nearby lymph nodes. In stage IIIC, cancer (1) has spread to the subserosa or to the serosa of the stomach wall and to 16 or more nearby lymph nodes; or (2) has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. Cancer has also spread to 7 or more nearby lymph nodes. Also called stage III stomach cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage III gestational trophoblastic neoplasia: (... jeh-STAY-shuh-nul troh-fuh-BLAS-tik NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "stage III gestational trophoblastic neoplasia"
    The tumor has spread to the lung, with or without spread to the ovary, fallopian tube, vagina, and/or the connective tissues around the uterus.
    More Information
    - Gestational Trophoblastic Disease Treatment
  stage III HPV-negative oropharyngeal cancer: (... NEH-guh-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage III HPV-negative oropharyngeal cancer"
    Cancer (1) is either larger than 4 centimeters or has spread to the top of the epiglottis (the flap that covers the trachea during swallowing); or (2) is any size. Cancer has spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor.
    More Information
    - Oropharyngeal Cancer Treatment
  stage III HPV-positive oropharyngeal cancer: (… PAH-zih-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage III HPV-positive oropharyngeal cancer"
    One of the following is true: (1) cancer has spread to the larynx (voice box), front part of the roof of the mouth, lower jaw, muscles that move the tongue, or to other parts of the head or neck. Cancer may have spread to lymph nodes in the neck; or (2) the tumor is any size and cancer may have spread to the larynx, front part of the roof of the mouth, lower jaw, muscles that move the tongue, or to other parts of the head or neck. Cancer has spread to one or more lymph nodes that are larger than 6 centimeters, anywhere in the neck.
    More Information
    - Oropharyngeal Cancer Treatment
  stage III hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage III hypopharyngeal cancer"
    The tumor (1) is larger than 4 centimeters or has spread to the larynx (voice box) or the mucosa (inner lining) of the esophagus. Cancer may have spread to one lymph node on the same side of the neck as the tumor. The affected lymph node is 3 centimeters or smaller; or (2) has spread to one lymph node on the same side of the neck as the tumor. The affected lymph node is 3 centimeters or smaller. Cancer is also found (a) in only one area of the hypopharynx and/or the tumor is 2 centimeters or smaller; or (b) in more than one area of the hypopharynx or in a nearby area, or the tumor is larger than 2 centimeters but not larger than 4 centimeters and has not spread to the larynx.
    More Information
    - Hypopharyngeal Cancer Treatment
  stage III intrahepatic bile duct cancer: (... IN-truh-heh-PA-tik bile dukt KAN-ser)
    Pronunciation of dictionary term "stage III intrahepatic bile duct cancer"
    Stage III intrahepatic bile duct cancer is divided into stages IIIA and IIIB. In stage IIIA, the tumor has spread through the capsule (outer lining) of the liver. In stage IIIB, cancer has spread to organs or tissues near the liver, such as the duodenum, colon, stomach, common bile duct, abdominal wall, diaphragm, or the part of the vena cava behind the liver, or the cancer has spread to nearby lymph nodes.
    More Information
    - Bile Duct Cancer Stages
  stage III intraocular melanoma of the iris: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... I-ris)
    Pronunciation of dictionary term "stage III intraocular melanoma of the iris"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, the tumor has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. In stage IIIB, the tumor has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is more than 5 millimeters thick.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage III kidney cancer: (... KID-nee KAN-ser)
    Pronunciation of dictionary term "stage III kidney cancer"
    One of the following is found: (1) the cancer in the kidney is any size and cancer has spread to nearby lymph nodes; or (2) cancer has spread to blood vessels in or near the kidney (renal vein or vena cava), to the fat around the structures in the kidney that collect urine, or to the layer of fatty tissue around the kidney. Cancer may have spread to nearby lymph nodes. Also called stage III renal cell cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage III kidney cancer. The cancer in the kidney is any size and cancer has spread to a) nearby lymph nodes, b) the blood vessels in or near the kidney (renal vein or vena cava), c) the structures in the kidney that collect urine, or d) the layer of fatty tissue around the kidney.
    Stage III kidney cancer; drawing shows cancer in the left kidney and in a) nearby lymph nodes, b) the renal vein, c) the structures in the kidney that collect urine, and d) the layer of fatty tissue around the kidney. Also shown are the right kidney, the right and left adrenal glands, and the vena cava.
  stage III laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage III laryngeal cancer"
    Cancer has formed in the supraglottis, glottis, or subglottis area of the larynx. In stage III cancer of the supraglottis, (1) cancer is in the larynx only and the vocal cords do not work, and/or cancer has spread near or through the inner part of the thyroid cartilage. Cancer may have also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (2) cancer is in one area of the supraglottis and the vocal cords work normally. Cancer has spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (3) cancer is in more than one area of the supraglottis or has spread to the area at the base of the tongue or to tissues near the vocal cords. The vocal cords work normally. Cancer has also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller. In stage III cancer of the glottis, (1) cancer is in the larynx only and the vocal cords do not work, and/or cancer has spread near or through the inner part of the thyroid cartilage. Cancer may have also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (2) cancer is in one or both vocal cords and the vocal cords work normally. Cancer has spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (3) cancer has spread to the supraglottis, subglottis, or both, and/or the vocal cords do not work normally. Cancer has also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller. In stage III cancer of the subglottis, (1) cancer is in the larynx only and the vocal cords do not work, and/or cancer has spread near or through the inner part of the thyroid cartilage. Cancer may have also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (2) cancer is in the subglottis only. Cancer has spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (3) cancer has spread to one or both vocal cords and the vocal cords may not work normally. Cancer has also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller.
    More Information
    - Laryngeal Cancer Treatment
  stage III leiomyosarcoma of the uterus: (... LY-oh-MY-oh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage III leiomyosarcoma of the uterus"
    The tumor has spread into tissues in the abdomen. Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, the tumor has spread to one site in the abdomen. In stage IIIB, the tumor has spread to more than one site in the abdomen. In stage IIIC, the tumor has spread to lymph nodes in the pelvis and/or around the abdominal aorta (the largest blood vessel in the abdomen).
    More Information
    - Uterine Sarcoma Treatment
  stage III lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage III lip and oral cavity cancer"
    The tumor (1) is larger than 2 centimeters but not larger than 4 centimeters and the deepest point of tumor invasion is greater than 10 millimeters; or (2) is larger than 4 centimeters and the deepest point of tumor invasion is 10 millimeters or less; or (3) has spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage III lymphedema: (… LIM-fuh-DEE-muh)
    Pronunciation of dictionary term "stage III lymphedema"
    A chronic condition marked by extreme swelling in an arm, leg, or other part of the body caused by a buildup of lymph in the tissues. The skin of the affected area usually feels hard and thick and may be darker in color. There may also be decreased mobility in the affected area. Stage III lymphedema can occur when lymph vessels or nodes become damaged or blocked, which affects the flow of lymph in the body. This is most commonly caused by cancer or cancer treatment, such as surgery or radiation therapy. Stage III lymphedema is considered the most advanced stage of lymphedema. Also called lymphostatic elephantiasis.
  stage III malignant pleural mesothelioma: (...muh-LIG-nunt PLOOR-ul MEH-zoh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "stage III malignant pleural mesothelioma"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, cancer is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. On the same side of the chest, cancer has also spread into one or more of the following: tissue between the ribs and the inside lining of the chest wall; fat in the area between the lungs; soft tissues of the chest wall; and/or sac around the heart. Cancer has spread to lymph nodes along the center of the chest on the same side of the chest as the tumor. In stage IIIB, cancer (1) is found in the inside lining of the chest wall, and may also be found in the thin layers of tissue that cover the lung, the organs between the lungs, and/or the top of the diaphragm on one side of the chest. On the same side of the chest, cancer may have also spread into one or more of the following: diaphragm; lung tissue; tissue between the ribs and the inside lining of the chest wall; fat in the area between the lungs; soft tissues of the chest wall; and/or sac around the heart. Cancer has spread to lymph nodes above the collarbone on either side of the chest, or cancer has spread to lymph nodes along the center of the chest on the opposite side of the chest as the tumor; or (2) is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. Cancer has also spread to one or more of the following: the chest wall and may be found in the rib; through the diaphragm into the peritoneum; the tissue lining the chest on the opposite side of the body as the tumor; the organs in the area between the lungs (esophagus, trachea, thymus, blood vessels); the spine; and/or through the sac around the heart or into the heart muscle. Cancer may have spread to lymph nodes.
    More Information
    - Malignant Mesothelioma Treatment
  stage III maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage III maxillary sinus cancer"
    Cancer (1) has spread to any of the following: the bone at the back of the maxillary sinus, the tissues under the skin, the part of the eye socket near the nose or the bottom of the eye socket, the area behind the cheek bone, and/or the ethmoid sinus; or (2) is found in the maxillary sinus and may have spread to any of the following: the bones around the maxillary sinus (including the roof of the mouth and the nose), the tissues under the skin, the part of the eye socket near the nose or the bottom of the eye socket, the area behind the cheek bone, and/or the ethmoid sinus. Cancer has also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage III medullary thyroid cancer: (... MED-yoo-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "stage III medullary thyroid cancer"
    The tumor is any size and cancer may have spread from the thyroid to nearby muscles in the neck. Cancer has spread to lymph nodes on one or both sides of the trachea or larynx.
    More Information
    - Thyroid Cancer Treatment
    Stage III medullary thyroid cancer. The tumor is any size and cancer may have spread from the thyroid to nearby muscles in the neck. Cancer has spread to lymph nodes on one or both sides of the trachea or larynx.
    Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx
  stage III Merkel cell carcinoma: (stayj ... MER-kul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage III Merkel cell carcinoma"
    Stage III Merkel cell cancer is divided into stages IIIA and IIIB. In stage IIIA, (1) the tumor may be any size and may have spread to nearby connective tissue, muscle, cartilage, or bone. A lymph node cannot be felt during a physical exam but cancer is found in the lymph node by sentinel lymph node biopsy or after the lymph node is removed and checked under a microscope for signs of cancer; or (2) a swollen lymph node is felt during a physical exam and/or seen on an imaging test. When the lymph node is removed and checked under a microscope for signs of cancer, cancer is found in the lymph node. The place where the cancer began is not known. In stage IIIB, the tumor may be any size and (1) may have spread to nearby connective tissue, muscle, cartilage, or bone. A swollen lymph node is felt during a physical exam and/or seen on an imaging test. When the lymph node is removed and checked under a microscope for signs of cancer, cancer is found in the lymph node; or (2) cancer is in a lymph vessel between the primary tumor and lymph nodes that are near or far away. Cancer may have spread to lymph nodes.
    More Information
    - Merkel Cell Carcinoma Treatment
  stage III multiple myeloma: (... MUL-tih-pul MY-eh-LOH-muh)
    Pronunciation of dictionary term "stage III multiple myeloma"
    A relatively large number of cancer cells have spread throughout the body. There may be one or more of the following: 1) a decrease in the number of red blood cells, causing anemia; 2) the amount of calcium in the blood is very high, because the bones are being damaged; 3) more than three bone tumors (plasmacytomas) are found; or 4) high levels of M protein are found in the blood or urine.
    More Information
    - Plasma Cell Neoplasms (Including Multiple Myeloma) Treatment
  stage III mycosis fungoides: (... my-KOH-sis fun-GOY-deez)
    Pronunciation of dictionary term "stage III mycosis fungoides"
    In stage III, 80% or more of the skin surface is reddened and may have patches, papules, plaques, or tumors. Lymph nodes may be abnormal, but they are not cancerous. There may be a low number of Sezary cells in the blood.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  stage III nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage III nasal cavity and ethmoid sinus cancer"
    Cancer (1) has spread to any of the following: the part of the eye socket near the nose or the bottom of the eye socket, the maxillary sinus, the roof of the mouth, and/or the bone between the eyes; or (2) is found in the nasal cavity or ethmoid sinus and may have spread to any of the following: the part of the eye socket near the nose or the bottom of the eye socket, the maxillary sinus, the roof of the mouth, and/or the bone between the eyes. Cancer has also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage III nasopharyngeal cancer: (...NAY-zoh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage III nasopharyngeal cancer"
    One of the following is true: (1) cancer has spread to one or more lymph nodes on both sides of the neck. The affected lymph nodes are 6 centimeters or smaller. Cancer is found in the nasopharynx only, or has spread from the nasopharynx to the oropharynx and/or to the nasal cavity, or is found only in the lymph nodes in the neck. The cancer cells in the lymph nodes are infected with Epstein-Barr virus (a virus linked to nasopharyngeal cancer); or (2) cancer has spread to the parapharyngeal space (area near the pharynx, between the base of the skull and the lower jaw) and/or to nearby muscles. Cancer has also spread to one or more lymph nodes on both sides of the neck. The affected lymph nodes are 6 centimeters or smaller; or (3) cancer has spread to the bones at the bottom of the skull, the bones in the neck, the jaw muscles, and/or the sinuses around the nose and eyes. Cancer may have also spread to one or more lymph nodes on one or both sides of the neck and/or the back of the throat. The affected lymph nodes are 6 centimeters or smaller.
    More Information
    - Nasopharyngeal Cancer Treatment
  stage III nonmelanoma skin cancer on the eyelid: (... non-MEH-luh-NOH-muh skin KAN-ser ... I-lid)
    Pronunciation of dictionary term "stage III nonmelanoma skin cancer on the eyelid"
    Stage III is divided into stages IIIA and IIIB. In stage IIIA, the tumor may be any size and may have spread to the edge of the eyelid where the lashes are, to the connective tissue in the eyelid, or to the full thickness of the eyelid, or to the eye, eye socket, sinuses, tear ducts, or brain, or to the tissues that support the eye. Cancer has spread to one lymph node on the same side of the body as the tumor and the node is 3 centimeters or smaller. In stage IIIB, the tumor may be any size and may have spread to the edge of the eyelid where the lashes are, to the connective tissue in the eyelid, or to the full thickness of the eyelid, or to the eye, eye socket, sinuses, tear ducts, or brain, or to the tissues that support the eye. Cancer has spread to (1) one lymph node on the same side of the body as the tumor and the node is larger than 3 centimeters; or (2) more than one lymph node on the opposite side of the body as the tumor or on both sides of the body.
    More Information
    - Skin Cancer Treatment
  stage III nonmelanoma skin cancer on the head and neck (not on the eyelid): (… non-MEH-luh-NOH-muh skin KAN-ser ...)
    Pronunciation of dictionary term "stage III nonmelanoma skin cancer on the head and neck (not on the eyelid)"
    The tumor (1) is larger than 4 centimeters, or cancer has spread to tissue covering the nerves below the dermis, or has spread below the subcutaneous tissue, or has spread to the bone and the bone has minor damage. Cancer may have also spread to one lymph node on the same side of the body as the tumor and the node is 3 centimeters or smaller, and cancer has not spread through to the outside covering of the lymph node; or (2) is 4 centimeters or smaller. Cancer has spread to one lymph node on the same side of the body as the tumor and the node is 3 centimeters or smaller.
    More Information
    - Skin Cancer Treatment
    Stage III nonmelanoma skin cancer of the head and neck (1). The tumor is (a) larger than 4 centimeters; or cancer has spread to (b) tissue covering the nerves below the dermis; or (c) below the subcutaneous tissue; or (d) the bone and the bone has minor damage. Cancer may have spread to one lymph node on the same side of the body as the tumor and the node is 3 centimeters or smaller, and cancer has not spread through to the outside covering of the lymph node (not shown).
    Stage III nonmelanoma skin cancer of the head and neck (1); drawing shows (a) an inset showing that the tumor is larger than 4 centimeters and that 4 centimeters is about the size of a walnut. Also shown is cancer spreading through the epidermis to (b) tissue covering the nerves below the dermis; (c) below the subcutaneous tissue; and (d) bone.
    Stage III nonmelanoma skin cancer of the head and neck (2). The tumor is 4 centimeters or smaller. Cancer has spread to one lymph node on the same side of the body as the tumor and the node is 3 centimeters or smaller.
    Stage III nonmelanoma skin cancer of the head and neck (2); drawing shows a primary tumor on the face and cancer in one lymph node on the same side of the body as the tumor. The top inset shows that the tumor is 4 centimeters or smaller and that 4 centimeters is about the size of a walnut. The bottom inset shows that the lymph node with cancer is 3 centimeters or smaller and that 3 centimeters is about the size of a grape.
  stage III oropharyngeal cancer: (... OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage III oropharyngeal cancer"
    Cancer is either (1) 4 centimeters or smaller; cancer has spread to one lymph node on the same side of the neck as the tumor and the lymph node is 3 centimeters or smaller; or (2) larger than 4 centimeters or has spread to the epiglottis (the flap that covers the trachea during swallowing). Cancer may have spread to one lymph node on the same side of the neck as the tumor and the lymph node is 3 centimeters or smaller.
    More Information
    - Oropharyngeal Cancer Treatment (Adult)
  stage III ovarian borderline tumor: (… oh-VAYR-ee-un BOR-der-line TOO-mer)
    The tumor is found in one or both ovaries or fallopian tubes, or is primary peritoneal cancer, and has spread outside the pelvis to other parts of the abdomen and/or to lymph nodes behind the peritoneum (the tissue that lines the abdominal wall and covers most of the organs in the abdomen). Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, one of the following is true: (1) the tumor has spread to lymph nodes behind the peritoneum only; or (2) tumor cells that can be seen only with a microscope have spread to the surface of the peritoneum outside the pelvis, such as the omentum (a fold of the peritoneum that surrounds the stomach and other organs in the abdomen). The tumor may have spread to lymph nodes behind the peritoneum. In stage IIIB, the tumor has spread to the peritoneum outside the pelvis, such as the omentum, and the tumor in the peritoneum is 2 centimeters or smaller. The tumor may have spread to lymph nodes behind the peritoneum. In stage IIIC, the tumor has spread to the peritoneum outside the pelvis, such as the omentum, and the tumor in the peritoneum is larger than 2 centimeters. The tumor may have spread to lymph nodes behind the peritoneum or to the surface of the liver or spleen. Also called stage III ovarian low malignant potential tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage III ovarian epithelial, fallopian tube, and primary peritoneal cancer: (... oh-VAYR-ee-un EH-pih-THEE-lee-ul fuh-LOH-pee-in ... PRY-mayr-ee PAYR-ih-toh-NEE-ul KAN-ser)
    Pronunciation of dictionary term "stage III ovarian epithelial, fallopian tube, and primary peritoneal cancer"
    Cancer is found in one or both ovaries or fallopian tubes, or is primary peritoneal cancer, and has spread outside the pelvis to other parts of the abdomen and/or to nearby lymph nodes. Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, one of the following is true: (1) cancer has spread to lymph nodes behind the peritoneum (tissue that lines the abdominal wall and covers organs in the abdomen) only; or (2) cancer cells that can be seen only with a microscope have spread to the surface of the peritoneum outside the pelvis, such as the omentum (a fold of the peritoneum that surrounds the stomach and other organs in the abdomen). Cancer may have spread to nearby lymph nodes. In stage IIIB, cancer has spread to the peritoneum outside the pelvis, such as the omentum, and the cancer in the peritoneum is 2 centimeters or smaller. Cancer may have spread to lymph nodes behind the peritoneum. In stage IIIC, cancer has spread to the peritoneum outside the pelvis, such as the omentum, and the cancer in the peritoneum is larger than 2 centimeters. Cancer may have spread to lymph nodes behind the peritoneum or to the surface of the liver or spleen.
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
    In stage IIIA, cancer is found in one or both ovaries or fallopian tubes and (a) cancer has spread to lymph nodes behind the peritoneum only, or (b) cancer cells that can be seen only with a microscope have spread to the surface of the peritoneum outside the pelvis, such as the omentum. Cancer may have also spread to nearby lymph nodes.
    Drawing of stage IIIA shows cancer inside both ovaries that has spread to (a) lymph nodes behind the peritoneum and (b) the omentum. The small intestine, colon, fallopian tubes, uterus, and bladder are also shown.
    In stage IIIB, cancer is found in one or both ovaries or fallopian tubes and has spread to the peritoneum outside the pelvis, such as the omentum. The cancer in the omentum is 2 centimeters or smaller. Cancer may have also spread to lymph nodes behind the peritoneum.
    Drawing of stage IIIB shows cancer inside both ovaries that has spread to the omentum. The cancer in the omentum is 2 centimeters or smaller. An inset shows 2 centimeters is about the size of a peanut. Also shown are the small intestine, colon, fallopian tubes, uterus, bladder, and lymph nodes behind the peritoneum.
    In stage IIIC, cancer is found in one or both ovaries or fallopian tubes and has spread to the peritoneum outside the pelvis, such as the omentum. The cancer in the omentum is larger than 2 centimeters. Cancer may have also spread to lymph nodes behind the peritoneum or to the surface of the liver or spleen (not shown).
    Drawing of stage IIIC shows cancer inside both ovaries that has spread to the omentum. The cancer in the omentum is larger than 2 centimeters. An inset shows 2 centimeters is about the size of a peanut. Also shown are the small intestine, colon, fallopian tubes, uterus, bladder, and lymph nodes behind the peritoneum.
  stage III ovarian germ cell tumor: (...oh-VAYR-ee-un jerm sel TOO-mer)
    Pronunciation of dictionary term "stage III ovarian germ cell tumor"
    Cancer is found in one or both ovaries or fallopian tubes, or is primary peritoneal cancer, and has spread outside the pelvis to other parts of the abdomen and/or to nearby lymph nodes. Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, one of the following is true: (1) cancer has spread to lymph nodes behind the peritoneum (the tissue that lines the abdominal wall and covers most of the organs in the abdomen) only; or (2) cancer cells that can be seen only with a microscope have spread to the surface of the peritoneum outside the pelvis, such as the omentum (a fold of the peritoneum that surrounds the stomach and other organs in the abdomen). Cancer may have spread to nearby lymph nodes. In stage IIIB, cancer has spread to the peritoneum outside the pelvis, such as the omentum, and the cancer in the peritoneum is 2 centimeters or smaller. Cancer may have spread to lymph nodes behind the peritoneum. In stage IIIC, cancer has spread to the peritoneum outside the pelvis, such as the omentum, and the cancer in the peritoneum is larger than 2 centimeters. Cancer may have spread to lymph nodes behind the peritoneum or to the surface of the liver or spleen.
    More Information
    - Ovarian Germ Cell Tumors Treatment
    In stage IIIA, cancer is found in one or both ovaries or fallopian tubes and (a) cancer has spread to lymph nodes behind the peritoneum only, or (b) cancer cells that can be seen only with a microscope have spread to the surface of the peritoneum outside the pelvis, such as the omentum. Cancer may have also spread to nearby lymph nodes.
    Drawing of stage IIIA shows cancer inside both ovaries that has spread to (a) lymph nodes behind the peritoneum and (b) the omentum. The small intestine, colon, fallopian tubes, uterus, and bladder are also shown.
    In stage IIIB, cancer is found in one or both ovaries or fallopian tubes and has spread to the peritoneum outside the pelvis, such as the omentum. The cancer in the omentum is 2 centimeters or smaller. Cancer may have also spread to lymph nodes behind the peritoneum.
    Drawing of stage IIIB shows cancer inside both ovaries that has spread to the omentum. The cancer in the omentum is 2 centimeters or smaller. An inset shows 2 centimeters is about the size of a peanut. Also shown are the small intestine, colon, fallopian tubes, uterus, bladder, and lymph nodes behind the peritoneum.
    In stage IIIC, cancer is found in one or both ovaries or fallopian tubes and has spread to the peritoneum outside the pelvis, such as the omentum. The cancer in the omentum is larger than 2 centimeters. Cancer may have also spread to lymph nodes behind the peritoneum or to the surface of the liver or spleen (not shown).
    Drawing of stage IIIC shows cancer inside both ovaries that has spread to the omentum. The cancer in the omentum is larger than 2 centimeters. An inset shows 2 centimeters is about the size of a peanut. Also shown are the small intestine, colon, fallopian tubes, uterus, bladder, and lymph nodes behind the peritoneum.
  stage III ovarian low malignant potential tumor: (… oh-VAYR-ee-un...muh-LIG-nunt poh-TEN-shul TOO-mer)
    Pronunciation of dictionary term "stage III ovarian low malignant potential tumor"
    The tumor is found in one or both ovaries or fallopian tubes, or is primary peritoneal cancer, and has spread outside the pelvis to other parts of the abdomen and/or to lymph nodes behind the peritoneum (the tissue that lines the abdominal wall and covers most of the organs in the abdomen). Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, one of the following is true: (1) the tumor has spread to lymph nodes behind the peritoneum only; or (2) tumor cells that can be seen only with a microscope have spread to the surface of the peritoneum outside the pelvis, such as the omentum (a fold of the peritoneum that surrounds the stomach and other organs in the abdomen). The tumor may have spread to lymph nodes behind the peritoneum. In stage IIIB, the tumor has spread to the peritoneum outside the pelvis, such as the omentum, and the tumor in the peritoneum is 2 centimeters or smaller. The tumor may have spread to lymph nodes behind the peritoneum. In stage IIIC, the tumor has spread to the peritoneum outside the pelvis, such as the omentum, and the tumor in the peritoneum is larger than 2 centimeters. The tumor may have spread to lymph nodes behind the peritoneum or to the surface of the liver or spleen. Also called stage III ovarian borderline tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage III pancreatic cancer: (... PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "stage III pancreatic cancer"
    The tumor is any size and cancer has spread to (1) four or more nearby lymph nodes; or (2) the major blood vessels near the pancreas.
    More Information
    - Pancreatic Cancer Treatment
    Stage III pancreatic cancer. The tumor is any size and cancer has spread to (a) 4 or more nearby lymph nodes; or (b) the major blood vessels near the pancreas. These include the portal vein, common hepatic artery, celiac axis (trunk), and superior mesenteric artery.
    Stage III pancreatic cancer; drawing shows cancer in the pancreas and in (a) 4 or more nearby lymph nodes and (b) the common hepatic artery. Also shown are the portal vein, celiac axis (trunk), and superior mesenteric artery.
  stage III papillary and follicular thyroid cancer (55 years and older): (... PA-pih-LAYR-ee ... fuh-LIH-kyoo-ler THY-royd KAN-ser ...)
    Pronunciation of dictionary term "stage III papillary and follicular thyroid cancer (55 years and older)"
    The tumor is any size and cancer has spread from the thyroid to soft tissue under the skin, the esophagus, the trachea, the larynx, or the recurrent laryngeal nerve (a nerve that goes to the larynx). Cancer may have spread to lymph nodes.
    More Information
    - Thyroid Cancer Treatment
    Stage III papillary and follicular thyroid cancer in patients 55 years and older. The tumor is any size and cancer has spread from the thyroid to soft tissue under the skin, the esophagus, the trachea, the larynx, or the recurrent laryngeal nerve (a nerve that goes to the larynx). Cancer may have spread to lymph nodes.
    Stage III papillary and follicular thyroid cancer in patients 55 years and older; drawing shows cancer that has spread from the thyroid gland to the esophagus, the trachea, the larynx, and the left recurrent laryngeal nerve. Also shown is the right recurrent laryngeal nerve.
  stage III penile cancer: (... PEE-nile KAN-ser)
    Pronunciation of dictionary term "stage III penile cancer"
    Stage III penile cancer is divided into stages IIIA and IIIB. In stage IIIA, cancer is found in the penis and has spread to 1 or 2 lymph nodes on one side of the groin. In stage IIIB, cancer is found in the penis and has spread to 3 or more lymph nodes on one side of the groin or to lymph nodes on both sides of the groin.
    More Information
    - Penile Cancer Treatment
  stage III perihilar bile duct cancer: (... PAYR-ee-HY-ler bile dukt KAN-ser)
    Pronunciation of dictionary term "stage III perihilar bile duct cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, cancer has spread to branches on one side of the hepatic artery or of the portal vein. In stage IIIB, cancer has spread to one or more of the following: (1) the main part of the portal vein or its branches on both sides; (2) the common hepatic artery; (3) the right hepatic duct and the left branch of the hepatic artery or of the portal vein; and/or (4) the left hepatic duct and the right branch of the hepatic artery or of the portal vein. In stage IIIC, cancer has spread to 1 to 3 nearby lymph nodes.
    More Information
    - Bile Duct Cancer Stages
  stage III prostate cancer: (...PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage III prostate cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, cancer is found in one or both sides of the prostate. The prostate-specific antigen (PSA) level is at least 20 and the Grade Group is 1, 2, 3, or 4 (Gleason score is 8 or less). In stage IIIB, cancer has spread from the prostate to the seminal vesicles or to nearby tissue or organs, such as the rectum, bladder, or pelvic wall. The PSA can be any level and the Grade Group is 1, 2, 3, or 4. In stage IIIC, cancer is found in one or both sides of the prostate and may have spread to the seminal vesicles or to nearby tissue or organs, such as the rectum, bladder, or pelvic wall. The PSA can be any level and the Grade Group is 5 (Gleason score is 9 or 10).
    More Information
    - Prostate Cancer Treatment
    Stage IIIA prostate cancer. Cancer is found in the prostate only. Cancer is found in one or both sides of the prostate. The prostate-specific antigen level is at least 20 and the Grade Group is 1, 2, 3, or 4.
    Stage IIIA prostate cancer; drawing shows cancer in one side of the prostate. The PSA level is at least 20 and the Grade Group is 1, 2, 3, or 4. Also shown are the bladder, rectum, and urethra.
    Stage IIIB prostate cancer. Cancer has spread from the prostate to the seminal vesicles or to nearby tissue or organs, such as the rectum, bladder, or pelvic wall. The prostate-specific antigen can be any level and the Grade Group is 1, 2, 3, or 4.
    Stage IIIB prostate cancer; drawing shows cancer that has spread from the prostate to the seminal vesicles and to nearby tissue. The PSA can be any level and the Grade Group is 1, 2, 3, or 4. Also shown are the pelvic wall, bladder, and rectum.
    Stage IIIC prostate cancer. Cancer is found in one or both sides of the prostate and may have spread to the seminal vesicles or to nearby tissue or organs, such as the rectum, bladder, or pelvic wall. The prostate-specific antigen can be any level and the Grade Group is 5.
    Stage IIIC prostate cancer; drawing shows cancer in one side of the prostate. The PSA can be any level and the Grade Group is 5. Also shown are the bladder, rectum, and urethra.
  stage III renal cell cancer: (... REE-nul sel KAN-ser)
    Pronunciation of dictionary term "stage III renal cell cancer"
    One of the following is found: (1) the cancer in the kidney is any size and cancer has spread to nearby lymph nodes; or (2) cancer has spread to blood vessels in or near the kidney (renal vein or vena cava), to the fat around the structures in the kidney that collect urine, or to the layer of fatty tissue around the kidney. Cancer may have spread to nearby lymph nodes. Also called stage III kidney cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage III kidney cancer. The cancer in the kidney is any size and cancer has spread to a) nearby lymph nodes, b) the blood vessels in or near the kidney (renal vein or vena cava), c) the structures in the kidney that collect urine, or d) the layer of fatty tissue around the kidney.
    Stage III kidney cancer; drawing shows cancer in the left kidney and in a) nearby lymph nodes, b) the renal vein, c) the structures in the kidney that collect urine, and d) the layer of fatty tissue around the kidney. Also shown are the right kidney, the right and left adrenal glands, and the vena cava.
  stage III salivary gland cancer: (...SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "stage III salivary gland cancer"
    One of the following is true: (1) the tumor is larger than 4 centimeters and/or cancer has spread to soft tissue around the salivary gland; or (2) the tumor is any size and cancer may have spread to soft tissue around the salivary gland. Cancer has spread to one lymph node on the same side of the head or neck as the tumor. The lymph node is 3 centimeters or smaller and cancer has not grown outside the lymph node.
    More Information
    - Salivary Gland Cancer Treatment
  stage III stomach cancer: (... STUH-muk KAN-ser)
    Pronunciation of dictionary term "stage III stomach cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, cancer (1) has spread to the muscle layer of the stomach wall and to 7 to 15 nearby lymph nodes; or (2) has spread to the subserosa (layer of connective tissue between the muscle layer and the outermost layer called the serosa) of the stomach wall and to 3 to 6 nearby lymph nodes; or (3) has spread to the serosa of the stomach wall and to 1 to 6 nearby lymph nodes; or (4) has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. In stage IIIB, cancer (1) may have spread to the submucosa (layer of connective tissue between the mucosa and the muscle layer) or to the muscle layer of the stomach wall and has spread to 16 or more nearby lymph nodes; or (2) has spread to the subserosa or to the serosa of the stomach wall and to 7 to 15 nearby lymph nodes; or (3) has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. Cancer has also spread to 1 to 6 nearby lymph nodes. In stage IIIC, cancer (1) has spread to the subserosa or to the serosa of the stomach wall and to 16 or more nearby lymph nodes; or (2) has spread to nearby organs, such as the spleen, colon, liver, diaphragm, pancreas, abdomen wall, adrenal gland, kidney, or small intestine, or to the back of the abdomen. Cancer has also spread to 7 or more nearby lymph nodes. Also called stage III gastric cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage III testicular cancer: (...tes-TIH-kyoo-ler KAN-ser)
    Pronunciation of dictionary term "stage III testicular cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer may have spread to one or more nearby lymph nodes. Cancer has spread to distant lymph nodes or to the lungs. All tumor marker levels are normal or slightly above normal. In stage IIIB, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread (1) to one or more nearby lymph nodes and has not spread to other parts of the body; or (2) to one or more nearby lymph nodes. Cancer has spread to distant lymph nodes or to the lungs. The level of one or more tumor markers is moderately above normal. In stage IIIC, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has spread (1) to one or more nearby lymph nodes and has not spread to other parts of the body; or (2) to one or more nearby lymph nodes. Cancer has spread to distant lymph nodes or to the lungs. The level of one or more tumor markers is high. OR, cancer is found anywhere in the testicle and may have spread into the spermatic cord or scrotum. Cancer has not spread to distant lymph nodes or the lung, but has spread to other parts of the body, such as the liver or bone. Tumor marker levels may range from normal to high.
    More Information
    - Testicular Cancer Treatment
  stage III thymoma: (... thy-MOH-muh)
    Pronunciation of dictionary term "stage III thymoma"
    Cancer has spread to nearby organs in the chest, including the lung, the sac around the heart, or large blood vessels that carry blood to the heart.
    More Information
    - Thymoma and Thymic Carcinoma Treatment
  stage III transitional cell cancer of the renal pelvis and ureter: (... tran-ZIH-shuh-nul sel KAN-ser ... REE-nul PEL-vus ... YER-eh-ter)
    Pronunciation of dictionary term "stage III transitional cell cancer of the renal pelvis and ureter"
    Cancer has spread (1) from the muscle layer of the renal pelvis to fat around the renal pelvis or to tissue in the kidney; or (2) from the muscle layer of the ureter to fat around the ureter.
    More Information
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
  stage III uterine sarcoma: (…YOO-teh-rin sar-KOH-muh)
    Pronunciation of dictionary term "stage III uterine sarcoma"
    Cancer has spread beyond the uterus and cervix, but has not spread beyond the pelvis. Stage III is divided into stages IIIA, IIIB, and IIIC, based on how far the cancer has spread within the pelvis. In stage IIIA, cancer has spread to the outer layer of the uterus and/or to the fallopian tubes, ovaries, and ligaments of the uterus. In stage IIIB, cancer has spread to the vagina or to the parametrium (connective tissue and fat around the uterus). In stage IIIC, cancer has spread to lymph nodes in the pelvis and/or around the aorta (largest artery in the body, which carries blood away from the heart).
    More Information
    - Uterine Sarcoma Treatment
  stage III vaginal cancer: (...VA-jih-nul KAN-ser)
    Pronunciation of dictionary term "stage III vaginal cancer"
    Cancer has spread to the wall of the pelvis.
    More Information
    - Vaginal Cancer Treatment
  stage III vulvar cancer: (... VUL-ver KAN-ser)
    Pronunciation of dictionary term "stage III vulvar cancer"
    The tumor is any size and has spread to the upper two-thirds of the urethra, the upper two-thirds of the vagina, the inner lining of the bladder or rectum, or to any number of lymph nodes. Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, cancer is found in lymph nodes in the groin that are not larger than 5 millimeters. In stage IIIB, cancer is found in lymph nodes in the groin that are larger than 5 millimeters. In stage IIIC, cancer is found in lymph nodes in the groin and has extended through the outer covering of the lymph nodes.
    More Information
    - Vulvar Cancer Treatment
  stage III Wilms tumor: (… wilmz TOO-mer)
    Pronunciation of dictionary term "stage III Wilms tumor"
    Cancer remains in the abdomen after surgery and at least one of the following is true: (1) cancer has spread to lymph nodes in the abdomen or pelvis; (2) cancer has spread to or through the surface of the peritoneum (the tissue that lines the abdominal cavity and covers most organs in the abdomen); (3) a biopsy of the tumor was done before it was removed; (4) the tumor broke open before or during surgery to remove it; (5) the tumor was removed in more than one piece; (6) cancer cells are found at the edges of the area where the tumor was removed; and/or (7) the entire tumor could not be removed because important organs or tissues in the body would be damaged.
    More Information
    - Wilms Tumor and Other Childhood Kidney Tumors Treatment
  stage IIIA adult primary liver cancer: (... uh-DULT PRY-mayr-ee LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage IIIA adult primary liver cancer"
    Stage III adult primary liver cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIA there is either (1) more than one tumor larger than 5 centimeters; or (2) one tumor that has spread to a major branch of blood vessels near the liver.
  stage IIIA anal cancer: (... AY-nul KAN-ser)
    Pronunciation of dictionary term "stage IIIA anal cancer"
    Stage III anal cancer is divided into stages IIIA and IIIB. In stage IIIA, the tumor may be any size and has spread to either (1) lymph nodes near the rectum; or (2) nearby organs, such as the vagina, urethra, and bladder.
  stage IIIA breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IIIA breast cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, (1) no tumor is found in the breast or the tumor may be any size. Cancer is found in 4 to 9 axillary lymph nodes or in the lymph nodes near the breastbone (found during imaging tests or a physical exam); or (2) the tumor is larger than 5 centimeters. Small clusters of breast cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes; or (3) the tumor is larger than 5 centimeters. Cancer has spread to 1 to 3 axillary lymph nodes or to the lymph nodes near the breastbone (found during a sentinel lymph node biopsy).
    More Information
    - Breast Cancer Treatment
    Stage IIIA breast cancer. No tumor is found in the breast or the tumor may be any size and cancer is found in 4 to 9 axillary lymph nodes or lymph nodes near the breastbone (left panel); OR the tumor is larger than 5 centimeters and small clusters of cancer cells (larger than 0.2 millimeter but not larger than 2 millimeters) are found in the lymph nodes (middle panel); OR the tumor is larger than 5 centimeters and cancer is found in 1 to 3 axillary lymph nodes or lymph nodes near the breastbone (right panel).
    Stage IIIA breast cancer. The drawing on the left shows no tumor in the breast; cancer is found in 8 axillary lymph nodes. The drawing in the middle shows the tumor is larger than 5 cm and small clusters of cancer cells are in the lymph nodes. The drawing on the right shows the tumor is larger than 5 cm and cancer is in 3 axillary lymph nodes.
  stage IIIA colorectal cancer: (...KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "stage IIIA colorectal cancer"
    Stage III colorectal cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, (1) cancer has spread through the mucosa (innermost layer) of the colon and/or rectum wall to the submucosa (layer of tissue next to the mucosa) or to the muscle layer of the colon and/or rectum wall. Cancer has spread to one to three nearby lymph nodes or cancer cells have formed in tissue near the lymph nodes; or (2) cancer has spread through the mucosa of the colon and/or rectum wall to the submucosa. Cancer has spread to four to six nearby lymph nodes.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage IIIA colorectal cancer. Cancer has spread through the mucosa of the colon/rectum wall to the submucosa or to the muscle layer and has spread to one to three nearby lymph nodes or to tissue near the lymph nodes; OR cancer has spread through the mucosa of the colon/rectum wall to the submucosa and to four to six nearby lymph nodes.
    Stage IIIA colorectal cancer; drawing shows a cross-section of the colon/rectum and a two-panel inset. Each panel shows the layers of the colon/rectum wall: the mucosa, submucosa, muscle layers, and serosa. Also shown are a blood vessel and lymph nodes. The first panel shows cancer in the mucosa, submucosa, and muscle layers and in 2 lymph nodes. The second panel shows cancer in the mucosa and submucosa and in 5 lymph nodes.
  stage IIIA esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIIA esophageal adenocarcinoma"
    Stage III is divided into stages IIIA, IIIB, and IIIC, depending on where the cancer has spread. In stage IIIA, cancer (1) is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall, and cancer is found in 3 to 6 lymph nodes near the tumor; or (2) has spread into the connective tissue layer of the esophagus wall, and cancer is found in 1 or 2 lymph nodes near the tumor; or (3) has spread into the diaphragm, pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or sac around the heart. The cancer can be removed by surgery.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIA adenocarcinoma of the esophagus (1). Cancer is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall, and cancer is found in 3 to 6 lymph nodes near the tumor; OR cancer has spread into the connective tissue layer of the esophagus wall, and cancer is found in 1 or 2 lymph nodes near the tumor.
    Stage IIIA adenocarcinoma of the esophagus (1); drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa, submucosa, muscle, and connective tissue layers. The left panel shows cancer in the mucosa and submucosa layers and in 3 lymph nodes. The right panel shows cancer in the mucosa, submucosa, muscle, and connective tissue layers and in 1 lymph node.
    Stage IIIA adenocarcinoma of the esophagus (2). Cancer has spread into the (a) diaphragm, (b) pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or (c) membrane (sac) around the heart. The cancer can be removed by surgery.
    Stage IIIA adenocarcinoma of the esophagus (2); drawing shows the esophagus, trachea, and lung. The top inset shows cancer that has spread from the esophagus into the diaphragm and pleura; the aorta, chest wall, and rib are also shown. The bottom inset shows cancer that has spread from the esophagus into the membrane (sac) around the heart.
  stage IIIA esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIIA esophageal squamous cell carcinoma"
    Stage III is divided into stages IIIA, IIIB, and IIIC, depending on where the cancer has spread. In stage IIIA, cancer (1) is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall, and cancer is found in 3 to 6 lymph nodes near the tumor; or (2) has spread into the connective tissue layer of the esophagus wall, and cancer is found in 1 or 2 lymph nodes near the tumor; or (3) has spread into the diaphragm, pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or sac around the heart. The cancer can be removed by surgery.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIA squamous cell cancer of the esophagus (1). Cancer is in the mucosa or submucosa layer and may have spread into the muscle layer of the esophagus wall, and cancer is found in 3 to 6 lymph nodes near the tumor; OR cancer has spread into the connective tissue layer of the esophagus wall, and cancer is found in 1 or 2 lymph nodes near the tumor.
    Stage IIIA squamous cell cancer of the esophagus (1); drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa, submucosa, muscle, and connective tissue layers. The left panel shows cancer in the mucosa and submucosa layers and in 3 lymph nodes. The right panel shows cancer in the mucosa, submucosa, muscle, and connective tissue layers and in 1 lymph node.
    Stage IIIA squamous cell cancer of the esophagus (2). Cancer has spread into the (a) diaphragm, (b) pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or (c) membrane (sac) around the heart. The cancer can be removed by surgery.
    Stage IIIA squamous cell cancer of the esophagus (2); drawing shows the esophagus, trachea, and lung. The top inset shows cancer that has spread from the esophagus into the diaphragm and pleura; the aorta, chest wall, and rib are also shown. The bottom inset shows cancer that has spread from the esophagus into the membrane (sac) around the heart.
  stage IIIA intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage IIIA intraocular melanoma of the ciliary body and choroid"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, the tumor (1) is size category 2 (12.1 to 18 millimeters wide and not more than 3 millimeters thick; or 9.1 to 15 millimeters wide and 3.1 to 6 millimeters thick; or not more than 12 millimeters wide and 6.1 to 9 millimeters thick) and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. The tumor may have spread to the ciliary body; or (2) is size category 3 (15.1 to 18 millimeters wide and 3.1 to 6 millimeters thick; or 12.1 to 18 millimeters wide and 6.1 to 9 millimeters thick; or not more than 18 millimeters wide and 9.1 to 12 millimeters thick; or not more than 15 millimeters wide and 12.1 to 15 millimeters thick) and has spread to the ciliary body; or (3) is size category 3 and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. The tumor has not spread to the ciliary body; or (4) is size category 4 (more than 18 millimeters wide and may be any thickness; or 15.1 to 18 millimeters wide and more than 12 millimeters thick; or not more than 15 millimeters wide and more than 15 millimeters thick) and is in the choroid only.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IIIA melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage IIIA melanoma"
    Stage III is divided into stages IIIA, IIIB, IIIC, and IIID. In stage IIIA, the tumor is not more than 1 millimeter thick, with ulceration (a break in the skin), or not more than 2 millimeters thick, without ulceration. Cancer is found in one to three lymph nodes by sentinel lymph node biopsy.
    More Information
    - Melanoma Treatment
  stage IIIA non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IIIA non-small cell lung cancer"
    Stage III non-small cell lung cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIA, the tumor is 5 centimeters or smaller and cancer has spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are around the trachea or aorta, or where the trachea divides into the bronchi. Also, one or more of the following may be found: (1) cancer has spread to the main bronchus, but has not spread to the carina; and/or (2) cancer has spread to the innermost layer of the membrane that covers the lung; and/or (3) part of the lung or the whole lung has collapsed or has developed pneumonitis; OR cancer has spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are in the lung or near the bronchus. Also, one or more of the following is found: (1) the tumor is larger than 5 centimeters but not larger than 7 centimeters; and/or (2) there are one or more separate tumors in the same lobe of the lung as the primary tumor; and/or (3) cancer has spread to any of the following: the membrane that lines the inside of the chest wall, the chest wall, the nerve that controls the diaphragm, or the outer layer of tissue of the sac around the heart; OR cancer may have spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are in the lung or near the bronchus. Also, one or more of the following is found: (1) the tumor is larger than 7 centimeters; and/or (2) there are one or more separate tumors in a different lobe of the lung with the primary tumor; and/or (3) the tumor is any size and cancer has spread to any of the following: the trachea, carina, esophagus, breastbone or backbone, diaphragm, heart, major blood vessels that lead to or from the heart (aorta or vena cava), or the nerve that controls the larynx (voice box).
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IIIA lung cancer (1). The tumor is 5 centimeters or smaller and cancer has spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are around the trachea or aorta (not shown), or where the trachea divides into the bronchi. Also, one or more of the following may be found: (a) cancer has spread to the main bronchus, but has not spread to the carina; and/or (b) cancer has spread to the inner membrane that covers the lung; and/or (c) part of the lung or the whole lung has collapsed or has pneumonitis (inflammation of the lung).
    Stage IIIA lung cancer (1); drawing shows a primary tumor (5 cm or smaller) in the left lung (top inset) and cancer in lymph nodes around the trachea. Also shown is cancer that has spread to (a) the left main bronchus and (b) the membrane covering the lung (bottom inset). Also shown is (c) part or all of the lung has collapsed or has pneumonitis (inflammation). The carina, pleura, and a rib (bottom inset) are also shown.
    Stage IIIA lung cancer (2). Cancer has spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are in the lung or near the bronchus. Also, one or more of the following is found: (a) the tumor is larger than 5 centimeters but not larger than 7 centimeters; and/or (b) there are one or more separate tumors in the same lobe of the lung as the primary tumor; and/or cancer has spread to any of the following: (c) the chest wall and/or the membrane that lines the inside of the chest wall, (d) the nerve that controls the diaphragm, and/or (e) the outer layer of tissue of the sac around the heart.
    Stage IIIA lung cancer (2); drawing shows (a) a primary tumor (larger than 5 cm but not larger than 7 cm) in the left lung and cancer in lymph nodes in the lung or near the bronchus on the same side of the chest as the primary tumor. Also shown is (b) separate tumors in the same lobe of the lung as the primary tumor and cancer that has spread to (c) the chest wall and the membranes covering the lung and chest wall (top right inset); (d) the nerve that controls the diaphragm; and (e) the sac around the heart (bottom right inset). The trachea, left main bronchus, diaphragm, heart, and a rib (top right inset) are also shown.
    Stage IIIA lung cancer (3). Cancer may have spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are in the lung or near the bronchus. Also, one or more of the following is found: (a) the primary tumor is larger than 7 centimeters; and/or (b) there are one or more separate tumors in a different lobe of the lung with the primary tumor; and/or the tumor is any size and cancer has spread to any of the following: (c) trachea, (d) carina, (e) esophagus, (f) breastbone or backbone, (g) diaphragm, (h) heart, (i) major blood vessels that lead to or from the heart (aorta or vena cava), or the nerve that controls the larynx (not shown).
    Stage IIIA lung cancer (3); drawing shows (a) a primary tumor (larger than 7 cm) in the left lung and (b) separate tumors in a different lobe of the lung with the primary tumor. Also shown is cancer that has spread to the (c) trachea, (d) carina, (e) esophagus, (f) breastbone, (g) diaphragm, (h) heart, and (i) the aorta and vena cava.
  stage IIIB adult primary liver cancer: (... uh-DULT PRY-mayr-ee LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage IIIB adult primary liver cancer"
    Stage III adult primary liver cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIB, there are one or more tumors of any size that have either (1) spread to nearby organs other than the gallbladder; or (2) broken through the lining of the peritoneal cavity.
  stage IIIB anal cancer: (... AY-nul KAN-ser)
    Pronunciation of dictionary term "stage IIIB anal cancer"
    Stage III anal cancer is divided into stages IIIA and IIIB. In stage IIIB, the tumor may be any size and has spread to (1) nearby organs and to lymph nodes near the rectum; or (2) lymph nodes on one side of the pelvis and/or groin, and may have spread to nearby organs; or (3) lymph nodes near the rectum and in the groin, and/or to lymph nodes on both sides of the pelvis and/or groin, and may have spread to nearby organs.
  stage IIIB breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IIIB breast cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIB, the tumor may be any size and cancer has spread to the chest wall and/or to the skin of the breast and caused swelling or an ulcer. Also, cancer may have spread to (1) up to 9 axillary lymph nodes; or (2) the lymph nodes near the breastbone. Cancer that has spread to the skin of the breast may also be inflammatory breast cancer.
    More Information
    - Breast Cancer Treatment
    Stage IIIB breast cancer. The tumor may be any size and cancer has spread to the chest wall and/or to the skin of the breast and caused swelling or an ulcer. Cancer may have spread to up to 9 axillary lymph nodes or the lymph nodes near the breastbone. Cancer that has spread to the skin of the breast may be inflammatory breast cancer.
    Stage IIIB breast cancer. The drawing on the left is a cross section of the breast showing that cancer has spread to the chest wall. The ribs, muscle, and fatty tissue are also shown. The drawing on the right shows the tumor has spread to the skin of the breast. An inset shows inflammatory breast cancer.
  stage IIIB colorectal cancer: (... KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "stage IIIB colorectal cancer"
    Stage III colorectal cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIB, (1) cancer has spread through the muscle layer of the colon and/or rectum wall to the serosa (outermost layer) of the colon and/or rectum wall or has spread through the serosa to the tissue that lines the organs in the abdomen (visceral peritoneum). Cancer has spread to one to three nearby lymph nodes or cancer cells have formed in tissue near the lymph nodes; or (2) cancer has spread to the muscle layer or to the serosa of the colon and/or rectum wall. Cancer has spread to four to six nearby lymph nodes; or (3) cancer has spread through the mucosa (innermost layer) of the colon and/or rectum wall to the submucosa (layer of tissue next to the mucosa) or to the muscle layer of the colon and/or rectum wall. Cancer has spread to seven or more nearby lymph nodes.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage IIIB colorectal cancer. Cancer has spread through the muscle layer of the colon/rectum wall to the serosa or has spread through the serosa to the visceral peritoneum (tissue that lines the organs in the abdomen). Cancer has spread to one to three nearby lymph nodes or to tissue near the lymph nodes; OR cancer has spread to the muscle layer or to the serosa of the colon/rectal wall and to four to six nearby lymph nodes; OR cancer has spread through the mucosa of the colon/rectal wall to the submucosa or to the muscle layer. Cancer has spread to seven or more nearby lymph nodes.
    Stage IIIB colorectal cancer; drawing shows a cross-section of the colon/rectum and a three-panel inset. Each panel shows the layers of the colon/rectum wall: the mucosa, submucosa, muscle layers, and serosa. Also shown are a blood vessel and lymph nodes. The first panel shows cancer in all layers, in 3 nearby lymph nodes, and in the visceral peritoneum. The second panel shows cancer in all layers and in 5 nearby lymph nodes. The third panel shows cancer in the mucosa, submucosa, and muscle layers and in 7 nearby lymph nodes.
  stage IIIB esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIIB esophageal adenocarcinoma"
    Stage III is divided into stages IIIA, IIIB, and IIIC, depending on where the cancer has spread. In stage IIIB, cancer has spread into the connective tissue layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIB adenocarcinoma of the esophagus. Cancer has spread into the connective tissue layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor.
    Stage IIIB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows the layers of the esophagus wall with cancer in the mucosa, submucosa, muscle, and connective tissue layers. Also shown is cancer in 4 lymph nodes.
  stage IIIB esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIIB esophageal squamous cell carcinoma"
    Stage III is divided into stages IIIA, IIIB, and IIIC, depending on where the cancer has spread. In stage IIIB, cancer has spread into the connective tissue layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIB squamous cell cancer of the esophagus. Cancer has spread into the connective tissue layer of the esophagus wall. Cancer is found in 3 to 6 lymph nodes near the tumor.
    Stage IIIB squamous cell cancer of the esophagus; drawing shows the esophagus and stomach. An inset shows the layers of the esophagus wall with cancer in the mucosa, submucosa, muscle, and connective tissue layers. Also shown is cancer in 4 lymph nodes.
  stage IIIB intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage IIIB intraocular melanoma of the ciliary body and choroid"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIB, the tumor (1) is size category 3 (15.1 to 18 millimeters wide and 3.1 to 6 millimeters thick; or 12.1 to 18 millimeters wide and 6.1 to 9 millimeters thick; or not more than 18 millimeters wide and 9.1 to 12 millimeters thick; or not more than 15 millimeters wide and 12.1 to 15 millimeters thick) and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. The tumor has spread to the ciliary body; or (2) is size category 4 (more than 18 millimeters wide and may be any thickness; or 15.1 to 18 millimeters wide and more than 12 millimeters thick; or not more than 15 millimeters wide and more than 15 millimeters thick) and has spread to the ciliary body; or (3) is size category 4 and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. The tumor has not spread to the ciliary body.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IIIB melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage IIIB melanoma"
    Stage III is divided into stages IIIA, IIIB, IIIC, and IIID. In stage IIIB, it is not known where the cancer began or the primary tumor can no longer be seen, and one of the following is true: (1) cancer is found in one lymph node by physical exam or imaging tests; or (2) there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; OR the tumor is not more than 1 millimeter thick, without ulceration (a break in the skin), or not more than 2 millimeters thick, without ulceration, and one of the following is true: (1) cancer is found in one to three lymph nodes by physical exam or imaging tests; or (2) there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; OR the tumor is more than 1 but not more than 2 millimeters thick, with ulceration, or more than 2 but not more than 4 millimeters thick, without ulceration, and one of the following is true: (1) cancer is found in one to three lymph nodes; or (2) there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
    More Information
    - Melanoma Treatment
  stage IIIB non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IIIB non-small cell lung cancer"
    Stage III non-small cell lung cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIB, the tumor is 5 centimeters or smaller and cancer has spread to lymph nodes above the collarbone on the same side of the chest as the primary tumor or to any lymph nodes on the opposite side of the chest as the primary tumor. Also, one or more of the following may be found: (1) cancer has spread to the main bronchus, but has not spread to the carina; and/or (2) cancer has spread to the innermost layer of the membrane that covers the lung; and/or (3) part of the lung or the whole lung has collapsed or has developed pneumonitis; OR the tumor may be any size and cancer has spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are around the trachea or aorta, or where the trachea divides into the bronchi. Also, one or more of the following is found: (1) there are one or more separate tumors in the same lobe or a different lobe of the lung with the primary tumor; and/or (2) cancer has spread to any of the following: the membrane that lines the inside of the chest wall, the chest wall, the nerve that controls the diaphragm, the outer layer of tissue of the sac around the heart, the trachea, carina, esophagus, breastbone or backbone, diaphragm, heart, major blood vessels that lead to or from the heart (aorta or vena cava), or the nerve that controls the larynx (voice box).
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IIIB lung cancer (1). The primary tumor is 5 centimeters or smaller and cancer has spread to lymph nodes above the collarbone on the same side of the chest as the primary tumor or to any lymph nodes on the opposite side of the chest as the primary tumor. Also, one or more of the following may be found: (a) cancer has spread to the main bronchus, but has not spread to the carina; and/or (b) cancer has spread to the inner membrane that covers the lung; and/or (c) part of the lung or the whole lung has collapsed or has pneumonitis (inflammation of the lung).
    Stage IIIB lung cancer (1); drawing shows a primary tumor (5 cm or smaller) in the left lung and cancer in lymph nodes above the collarbone on the same side of the chest as the primary tumor and in lymph nodes on the opposite side of the chest as the primary tumor. Also shown is cancer that has spread to (a) the left main bronchus and (b) the membrane covering the lung. Also shown is (c) part or all of the lung has collapsed or has pneumonitis (inflammation). The carina, pleura, and a rib (inset) are also shown.
    Stage IIIB lung cancer (2). The tumor may be any size and cancer has spread to lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are around the trachea or aorta (not shown), or where the trachea divides into the bronchi. Also, one or more of the following is found: (a) there are one or more separate tumors in the same lobe or a different lobe of the lung with the primary tumor; and/or (b) cancer has spread to any of the following: the chest wall or the membrane that lines the inside of the chest wall, the nerve that controls the voice box, the trachea, the carina, the esophagus, the breastbone or backbone (not shown), the diaphragm, the nerve that controls the diaphragm, the heart, the major blood vessels that lead to or from the heart (aorta or vena cava), or the outer layer of tissue of the sac around the heart.
    Stage IIIB lung cancer (2); drawing shows a primary tumor in the left lung and (a) a separate tumor in a different lobe of the lung with the primary tumor. Also shown is cancer in lymph nodes on the same side of the chest as the primary tumor. The lymph nodes with cancer are around the trachea or where the trachea divides into the bronchi. Also shown is (b) cancer that has spread to the following: the chest wall and the lining of the chest wall and lung, the nerve that controls the voice box, the trachea, the carina, the esophagus, the breastbone, the diaphragm, the nerve that controls the diaphragm, the aorta and vena cava, the heart, and the sac around the heart.
  stage IIIC adult primary liver cancer: (... uh-DULT PRY-mayr-ee LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage IIIC adult primary liver cancer"
    Stage III adult primary liver cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIC, the cancer has spread to nearby lymph nodes.
  stage IIIC breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IIIC breast cancer"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIC, no tumor is found in the breast or the tumor may be any size. Cancer may have spread to the skin of the breast and caused swelling or an ulcer and/or has spread to the chest wall. Also, cancer has spread to: (1) 10 or more axillary lymph nodes; or (2) lymph nodes above or below the collarbone; or (3) axillary lymph nodes and lymph nodes near the breastbone. Cancer that has spread to the skin of the breast may also be inflammatory breast cancer. For treatment, stage IIIC breast cancer is divided into operable and inoperable stage IIIC.
    More Information
    - Breast Cancer Treatment
    Stage IIIC breast cancer. No tumor is found in the breast or the tumor may be any size and may have spread to the chest wall and/or to the skin of the breast and caused swelling or an ulcer. Also, cancer has spread to 10 or more axillary lymph nodes (left panel); OR to lymph nodes above or below the collarbone (middle panel); OR to axillary lymph nodes and lymph nodes near the breastbone (right panel). Cancer that has spread to the skin of the breast may be inflammatory breast cancer.
    Stage IIIC breast cancer. The drawing on the left shows cancer in lymph nodes in the axilla. The drawing in the middle shows cancer in lymph nodes above the collarbone. The drawing on the right shows cancer in lymph nodes in the axilla and in lymph nodes near the breastbone.
  stage IIIC colorectal cancer: (... KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "stage IIIC colorectal cancer"
    Stage III colorectal cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIC, cancer has spread (1) through the serosa (outermost layer) of the colon and/or rectum wall to the tissue that lines the organs in the abdomen (visceral peritoneum). Cancer has spread to 4 to 6 nearby lymph nodes; or (2) through the muscle layer of the colon and/or rectum wall to the serosa of the colon and/or rectum wall or has spread through the serosa to the visceral peritoneum. Cancer has spread to seven or more nearby lymph nodes; or (3) through the serosa of the colon and/or rectum wall to nearby organs. Cancer has spread to one or more nearby lymph nodes or cancer cells have formed in tissue near the lymph nodes.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage IIIC colorectal cancer. Cancer has spread through the serosa of the colon/rectum wall to the visceral peritoneum (tissue that lines the organs in the abdomen). Cancer has spread to four to six nearby lymph nodes; OR cancer has spread through the muscle layer of the colon/rectum wall to the serosa or has spread through the serosa to the visceral peritoneum. Cancer has spread to seven or more nearby lymph nodes; OR cancer has spread through the serosa of the colon/rectal wall to nearby organs. Cancer has spread to one or more nearby lymph nodes or to tissue near the lymph nodes.
    Stage IIIC colorectal cancer; drawing shows a cross-section of the colon/rectum and a three-panel inset. Each panel shows the layers of the colon/rectum wall: the mucosa, submucosa, muscle layers, and serosa. Also shown are a blood vessel and lymph nodes. The first panel shows cancer in all layers, in 4 lymph nodes, and in the visceral peritoneum. The second panel shows cancer in all layers and in 7 lymph nodes. The third panel shows cancer in all layers, in 2 lymph nodes, and spreading to nearby organs.
  stage IIIC esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIIC esophageal adenocarcinoma"
    Stage III is divided into stages IIIA, IIIB, and IIIC, depending on where the cancer has spread. In stage IIIC, cancer has spread (1) into the diaphragm, pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or sac around the heart. The cancer can be removed by surgery. Cancer is found in 1 to 6 lymph nodes near the tumor; or (2) into other nearby organs, such as the aorta, trachea, or spine, and the cancer cannot be removed by surgery; or (3) to 7 or more lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIC adenocarcinoma of the esophagus (1). Cancer has spread into the (a) diaphragm, (b) pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or (c) membrane (sac) around the heart. The cancer can be removed by surgery. Cancer is found in 1 to 6 lymph nodes near the tumor.
    Stage IIIC adenocarcinoma of the esophagus (1); drawing shows the esophagus, trachea, and lung. The top inset shows cancer that has spread from the esophagus into the diaphragm and pleura; the aorta, chest wall, and rib are also shown. The bottom inset shows cancer that has spread from the esophagus into the membrane (sac) around the heart. Also shown is cancer in lymph nodes near the esophagus.
    Stage IIIC adenocarcinoma of the esophagus (2). Cancer has spread into nearby organs, such as the aorta, trachea, or spine, and the cancer cannot be removed by surgery; OR cancer has spread to 7 or more lymph nodes near the tumor.
    Stage IIIC adenocarcinoma of the esophagus (2); drawing shows cancer that has spread from the esophagus into the trachea, aorta, and spine. Also shown is cancer in lymph nodes near the esophagus.
  stage IIIC esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IIIC esophageal squamous cell carcinoma"
    Stage III is divided into stages IIIA, IIIB, and IIIC, depending on where the cancer has spread. In stage IIIC, cancer has spread (1) into the diaphragm, pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or sac around the heart. The cancer can be removed by surgery. Cancer is found in 1 to 6 lymph nodes near the tumor; or (2) into other nearby organs, such as the aorta, trachea, or spine, and the cancer cannot be removed by surgery; or (3) to 7 or more lymph nodes near the tumor.
    More Information
    - Esophageal Cancer Treatment
    Stage IIIC squamous cell cancer of the esophagus (1). Cancer has spread into the (a) diaphragm, (b) pleura (tissue that covers the lungs and lines the inner wall of the chest cavity), or (c) membrane (sac) around the heart. The cancer can be removed by surgery. Cancer is found in 1 to 6 lymph nodes near the tumor.
    Stage IIIC squamous cell cancer of the esophagus (1); drawing shows the esophagus, trachea, and lung. The top inset shows cancer that has spread from the esophagus into the diaphragm and pleura; the aorta, chest wall, and rib are also shown. The bottom inset shows cancer that has spread from the esophagus into the membrane (sac) around the heart. Also shown is cancer in lymph nodes near the esophagus.
    Stage IIIC squamous cell cancer of the esophagus (2). Cancer has spread into nearby organs, such as the aorta, trachea, or spine, and the cancer cannot be removed by surgery; OR cancer has spread to 7 or more lymph nodes near the tumor.
    Stage IIIC squamous cell cancer of the esophagus (2); drawing shows cancer that has spread from the esophagus into the trachea, aorta, and spine. Also shown is cancer in lymph nodes near the esophagus.
  stage IIIC intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage IIIC intraocular melanoma of the ciliary body and choroid"
    Stage III is divided into stages IIIA, IIIB, and IIIC. In stage IIIC, the tumor (1) is size category 4 (more than 18 millimeters wide and may be any thickness; or 15.1 to 18 millimeters wide and more than 12 millimeters thick; or not more than 15 millimeters wide and more than 15 millimeters thick) and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is not more than 5 millimeters thick. The tumor has spread to the ciliary body; or (2) may be any size and has spread through the sclera to the outside of the eyeball. The part of the tumor outside the eyeball is more than 5 millimeters thick.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IIIC melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage IIIC melanoma"
    Stage III is divided into stages IIIA, IIIB, IIIC, and IIID. In stage IIIC, it is not known where the cancer began or the primary tumor can no longer be seen. Cancer is found: (1) in two or three lymph nodes; or (2) in one lymph node and there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; or (3) in four or more lymph nodes, or in any number of lymph nodes that are matted together; or (4) in two or more lymph nodes and/or in any number of lymph nodes that are matted together. There are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; OR the tumor is not more than 2 millimeters thick, with or without ulceration (a break in the skin), or not more than 4 millimeters thick, without ulceration. Cancer is found: (1) in one lymph node and there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; or (2) in four or more lymph nodes, or in any number of lymph nodes that are matted together; or (3) in two or more lymph nodes and/or in any number of lymph nodes that are matted together. There are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; OR the tumor is more than 2 but not more than 4 millimeters thick, with ulceration, or more than 4 millimeters thick, without ulceration. Cancer is found in one or more lymph nodes and/or in any number of lymph nodes that are matted together. There may be microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; OR the tumor is more than 4 millimeters thick, with ulceration. Cancer is found in one or more lymph nodes and/or there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
    More Information
    - Melanoma Treatment
  stage IIIC non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IIIC non-small cell lung cancer"
    Stage III non-small cell lung cancer is divided into stages IIIA, IIIB, and IIIC. In stage IIIC, the tumor may be any size and cancer has spread to lymph nodes above the collarbone on the same side of the chest as the primary tumor or to any lymph nodes on the opposite side of the chest as the primary tumor. Also, one or more of the following is found: (1) there are one or more separate tumors in the same lobe or a different lobe of the lung with the primary tumor; and/or (2) cancer has spread to any of the following: the membrane that lines the inside of the chest wall, the chest wall, the nerve that controls the diaphragm, the outer layer of tissue of the sac around the heart, the trachea, carina, esophagus, breastbone or backbone, diaphragm, heart, major blood vessels that lead to or from the heart (aorta or vena cava), or the nerve that controls the larynx (voice box).
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IIIC lung cancer. The tumor may be any size and cancer has spread to lymph nodes above the collarbone on the same side of the chest as the primary tumor or to any lymph nodes on the opposite side of the chest as the primary tumor. Also, one or more of the following is found: (a) there are one or more separate tumors in the same lobe or a different lobe of the lung with the primary tumor; and/or (b) cancer has spread to any of the following: the chest wall or the membrane that lines the inside of the chest wall, the nerve that controls the voice box, the trachea, the carina, the esophagus, the breastbone or backbone (not shown), the diaphragm, the nerve that controls the diaphragm, the heart, the major blood vessels that lead to or from the heart (aorta or vena cava), or the outer layer of tissue of the sac around the heart.
    Stage IIIC lung cancer; drawing shows a primary tumor in the left lung and (a) separate tumors in the same lobe of the lung with the primary tumor. Also shown is cancer in lymph nodes above the collarbone on the same side and opposite side of the chest as the primary tumor. Also shown is (b) cancer that has spread to the following: the chest wall and the lining of the chest wall and lung, the nerve that controls the voice box, the trachea, the carina, the esophagus, the breastbone, the diaphragm, the nerve that controls the diaphragm, the heart, the aorta and vena cava, and the sac around the heart.
  stage IIID melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage IIID melanoma"
    Stage III is divided into stages IIIA, IIIB, IIIC, and IIID. In stage IIID, the tumor is more than 4 millimeters thick, with ulceration (a break in the skin). Cancer is found: (1) in four or more lymph nodes, or in any number of lymph nodes that are matted together; or (2) in two or more lymph nodes and/or in any number of lymph nodes that are matted together. There are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
    More Information
    - Melanoma Treatment
  stage IV adenosarcoma of the uterus: (... A-deh-noh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage IV adenosarcoma of the uterus"
    Stage IV is divided into stages IVA and IVB. In stage IVA, the tumor has spread to the bladder and/or the rectum. In stage IVB, the tumor has spread to distant parts of the body.
    More Information
    - Uterine Sarcoma Treatment
  stage IV adrenocortical cancer: (... uh-DREE-noh-KOR-tih-kul KAN-ser)
    Pronunciation of dictionary term "stage IV adrenocortical cancer"
    The tumor is any size, may have spread to nearby lymph nodes, and has spread to other parts of the body, such as the lung, bone, or peritoneum.
    More Information
    - Adrenocortical Carcinoma Treatment
  stage IV adult Hodgkin lymphoma: (... uh-dult HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage IV adult Hodgkin lymphoma"
    Cancer (1) has spread throughout one or more organs outside the lymph system; or (2) is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm and in one organ that is outside the lymph system and not near the affected lymph nodes; or (3) is found in groups of lymph nodes both above and below the diaphragm and in any organ that is outside the lymph system; or (4) is found in the liver, bone marrow, more than one place in the lung, or cerebrospinal fluid (CSF). The cancer has not spread directly into the liver, bone marrow, lung, or CSF from nearby lymph nodes.
    More Information
    - Hodgkin Lymphoma Treatment
    Stage IV adult lymphoma. Cancer (a) has spread throughout one or more organs outside the lymph system; or (b) is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm and in one organ that is outside the lymph system and not near the affected lymph nodes; or (c) is found in groups of lymph nodes above the diaphragm and below the diaphragm and in any organ that is outside the lymph system; or (d) is found in the liver, bone marrow, more than one place in the lung, or cerebrospinal fluid (CSF). The cancer has not spread directly into the liver, bone marrow, lung, or CSF from nearby lymph nodes.
    Stage IV adult lymphoma; drawing shows four panels: (a) the top left panel shows cancer in the liver; (b) the top right panel shows cancer in the left lung and in two groups of lymph nodes below the diaphragm; (c) the bottom left panel shows cancer in the left lung and in a group of lymph nodes above the diaphragm and below the diaphragm; and (d) the bottom right panel shows cancer in both lungs, the liver, and the bone marrow (pullout). Also shown is primary cancer in the lymph nodes and a pullout of the brain with cerebrospinal fluid (in blue).
  stage IV adult non-Hodgkin lymphoma: (... uh-dult non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage IV adult non-Hodgkin lymphoma"
    Cancer (1) has spread throughout one or more organs outside the lymph system; or (2) is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm and in one organ that is outside the lymph system and not near the affected lymph nodes; or (3) is found in groups of lymph nodes above and below the diaphragm and in any organ that is outside the lymph system; or (4) is found in the liver, bone marrow, more than one place in the lung, or cerebrospinal fluid (CSF). The cancer has not spread directly into the liver, bone marrow, lung, or CSF from nearby lymph nodes.
    More Information
    - Non-Hodgkin Lymphoma Treatment
    Stage IV adult lymphoma. Cancer (a) has spread throughout one or more organs outside the lymph system; or (b) is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm and in one organ that is outside the lymph system and not near the affected lymph nodes; or (c) is found in groups of lymph nodes above the diaphragm and below the diaphragm and in any organ that is outside the lymph system; or (d) is found in the liver, bone marrow, more than one place in the lung, or cerebrospinal fluid (CSF). The cancer has not spread directly into the liver, bone marrow, lung, or CSF from nearby lymph nodes.
    Stage IV adult lymphoma; drawing shows four panels: (a) the top left panel shows cancer in the liver; (b) the top right panel shows cancer in the left lung and in two groups of lymph nodes below the diaphragm; (c) the bottom left panel shows cancer in the left lung and in a group of lymph nodes above the diaphragm and below the diaphragm; and (d) the bottom right panel shows cancer in both lungs, the liver, and the bone marrow (pullout). Also shown is primary cancer in the lymph nodes and a pullout of the brain with cerebrospinal fluid (in blue).
  stage IV adult primary liver cancer: (... uh-DULT PRY-mayr-ee LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage IV adult primary liver cancer"
    Cancer has spread beyond the liver to other places in the body, such as the bones or lungs. The tumors may be of any size and may also have spread to nearby blood vessels and/or lymph nodes.
  stage IV adult soft tissue sarcoma of the retroperitoneum: (… uh-DULT ... TIH-shoo sar-KOH-muh ... REH-troh-PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "stage IV adult soft tissue sarcoma of the retroperitoneum"
    The tumor is any size, any grade, and may have spread to nearby lymph nodes. Cancer has spread to other parts of the body, such as the lung.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage IV adult soft tissue sarcoma of the trunk, arms, and legs: (... uh-DULT ... TIH-shoo sar-KOH-muh ...)
    Pronunciation of dictionary term "stage IV soft tissue sarcoma of the trunk, arms, and legs"
    The tumor is (1) any size, any grade, and has spread to nearby lymph nodes; or (2) any size, any grade, and may have spread to nearby lymph nodes. Cancer has spread to other parts of the body, such as the lung.
    More Information
    - Soft Tissue Sarcoma Treatment
  stage IV AIDS-related lymphoma: (... ree-LAY-ted lim-FOH-muh)
    Pronunciation of dictionary term "stage IV AIDS-related lymphoma"
    Cancer (1) has spread throughout one or more organs outside the lymph system; or (2) is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm and in one organ that is outside the lymph system and not near the affected lymph nodes; or (3) is found in groups of lymph nodes both above and below the diaphragm and in any organ that is outside the lymph system; or (4) is found in the liver, bone marrow, more than one place in the lung, or cerebrospinal fluid (CSF). The cancer has not spread directly into the liver, bone marrow, lung, or CSF from nearby lymph nodes.
    More Information
    - AIDS-Related Lymphoma Treatment
    Stage IV adult lymphoma. Cancer (a) has spread throughout one or more organs outside the lymph system; or (b) is found in two or more groups of lymph nodes that are either above the diaphragm or below the diaphragm and in one organ that is outside the lymph system and not near the affected lymph nodes; or (c) is found in groups of lymph nodes above the diaphragm and below the diaphragm and in any organ that is outside the lymph system; or (d) is found in the liver, bone marrow, more than one place in the lung, or cerebrospinal fluid (CSF). The cancer has not spread directly into the liver, bone marrow, lung, or CSF from nearby lymph nodes.
    Stage IV adult lymphoma; drawing shows four panels: (a) the top left panel shows cancer in the liver; (b) the top right panel shows cancer in the left lung and in two groups of lymph nodes below the diaphragm; (c) the bottom left panel shows cancer in the left lung and in a group of lymph nodes above the diaphragm and below the diaphragm; and (d) the bottom right panel shows cancer in both lungs, the liver, and the bone marrow (pullout). Also shown is primary cancer in the lymph nodes and a pullout of the brain with cerebrospinal fluid (in blue).
  stage IV anal cancer: (... AY-nul KAN-ser)
    Pronunciation of dictionary term "stage IV anal cancer"
    The tumor is any size. Cancer may have spread to lymph nodes or nearby organs and has spread to other parts of the body, such as the liver or lungs.
    More Information
    - Anal Cancer Treatment
  stage IV bladder cancer: (... BLA-der KAN-ser)
    Pronunciation of dictionary term "stage IV bladder cancer"
    Stage IV is divided into stages IVA and IVB. In stage IVA, cancer has spread (1) to the abdominal wall or pelvic wall; or (2) to lymph nodes that are above the major arteries in the pelvis, called the common iliac arteries. In stage IVB, cancer has spread to other parts of the body, such as the lung, bone, or liver.
    More Information
    - Bladder Cancer Stages
    Stage IVA and IVB bladder cancer. In stage IVA, cancer has spread to (a) the abdominal or pelvic wall; or (b) lymph nodes above the common iliac arteries. In stage IVB, cancer has spread to (c) other parts of the body, such as the lung, liver, or bone.
    Stage IVA and IVB bladder cancer; drawing shows cancer that has spread from the bladder to (a) the abdominal or pelvic wall and (b) lymph nodes above the common iliac arteries. Also shown is cancer that has spread to (c) other parts of the body, including the lung, liver, and bone.
  stage IV breast cancer: (... brest KAN-ser)
    Pronunciation of dictionary term "stage IV breast cancer"
    Cancer has spread to other organs of the body, most often the bones, lungs, liver, or brain.
    More Information
    - Breast Cancer Treatment
    Stage IV breast cancer. The cancer has spread to other parts of the body, such as the brain, lung, liver, or bone.
    Stage IV breast cancer; drawing shows other parts of the body where breast cancer may spread, including the brain, lung, liver, and bone. An inset shows cancer cells spreading from the breast, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV cancer of the uterus: (... KAN-ser ... YOO-ter-us)
    Pronunciation of dictionary term "stage IV cancer of the uterus"
    Cancer cells have spread to the lining of the bladder or rectum or to distant parts of the body.
  stage IV cervical cancer: (... SER-vih-kul KAN-ser)
    Pronunciation of dictionary term "stage IV cervical cancer"
    Cancer has spread beyond the pelvis, or has spread to the lining of the bladder or rectum, or has spread to other parts of the body. Stage IV is divided into stages IVA and IVB, based on where the cancer has spread. In stage IVA, cancer has spread to nearby pelvic organs, such as the bladder or rectum. In stage IVB, cancer has spread to other parts of the body, such as the liver, lungs, bones, or distant lymph nodes.
    More Information
    - Cervical Cancer Stages
    Stage IVA cervical cancer. Cancer has spread to nearby pelvic organs, such as the bladder or rectum.
    Stage IVA cervical cancer; drawing and inset show cancer that has spread from the cervix to the bladder and rectal wall.
    Stage IVB cervical cancer. Cancer has spread to other parts of the body, such as the lymph nodes, lung, liver, or bone.
    Stage IVB cervical cancer; drawing shows other parts of the body where cervical cancer may spread, including the lymph nodes, lung, liver, and bone. An inset shows cancer cells spreading from the cervix, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV childhood Hodgkin lymphoma: (...HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage IV childhood Hodgkin lymphoma"
    Cancer (1) has spread throughout one or more organs outside the lymph system and may be in lymph nodes near those organs; or (2) is found in two or more groups of lymph nodes that are on the same side of the diaphragm and in an organ that is outside the lymph system and not near the affected lymph nodes; or (3) is found in groups of lymph nodes on both sides of the diaphragm and in any organ that is outside the lymph system; or (4) has spread to the lungs, liver, or bone marrow from areas far away.
    More Information
    - Childhood Hodgkin Lymphoma Treatment
    Stage IV childhood Hodgkin lymphoma. Cancer (a) has spread throughout one or more organs outside the lymph system, such as the liver; or (b) is found in two or more groups of lymph nodes that are on the same side of the diaphragm and in an organ that is outside the lymph system, such as the lung, and not near the affected lymph nodes; or (c) is found in groups of lymph nodes on both sides of the diaphragm and in any organ that is outside the lymph system, such as the lung; or (d) has spread to the lungs, liver, or bone marrow from areas far away.
    Stage IV childhood Hodgkin lymphoma; drawing shows four panels: (a) the top left panel shows cancer in the liver; (b) the top right panel shows cancer in the left lung and in two groups of lymph nodes below the diaphragm; (c) the bottom left panel shows cancer in the left lung and in a group of lymph nodes above the diaphragm and below the diaphragm; and (d) the bottom right panel shows cancer in both lungs and the liver. There is also a pullout showing cancer in the bone marrow.
  stage IV childhood liver cancer: (... LIH-ver KAN-ser)
    Pronunciation of dictionary term "stage IV childhood liver cancer"
    The cancer has spread to other parts of the body, such as the lung or brain.
  stage IV childhood non-Hodgkin lymphoma: (... non-HOJ-kin lim-FOH-muh)
    Pronunciation of dictionary term "stage IV childhood non-Hodgkin lymphoma"
    Cancer is found in the bone marrow, brain, or cerebrospinal fluid. Cancer may also be found in other parts of the body.
    More Information
    - Childhood Non-Hodgkin Lymphoma Treatment
    Stage IV childhood non-Hodgkin lymphoma. Cancer is found in the bone marrow, brain, or cerebrospinal fluid (CSF). Cancer may also be found in other parts of the body.
    Stage IV childhood non-Hodgkin lymphoma; drawing shows the brain, spinal cord, and cerebrospinal fluid in and around the brain and spinal cord. An inset shows cancer in the bone marrow.
  stage IV chronic lymphocytic leukemia: (… KRAH-nik LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "stage IV chronic lymphocytic leukemia"
    There are too many lymphocytes in the blood and too few platelets. The lymph nodes, liver, or spleen may be larger than normal and there may be too few red blood cells.
    More Information
    - Chronic Lymphocytic Leukemia Treatment
  stage IV colorectal cancer: (...KOH-loh-REK-tul KAN-ser)
    Pronunciation of dictionary term "stage IV colorectal cancer"
    Stage IV colorectal cancer is divided into stages IVA, IVB, and IVC. In stage IVA, cancer has spread to one area or organ that is not near the colon and/or rectum, such as the liver, lung, ovary, or a distant lymph node. In stage IVB, cancer has spread to more than one area or organ that is not near the colon and/or rectum, such as the liver, lung, ovary, or a distant lymph node. In stage IVC, cancer has spread to the tissue that lines the wall of the abdomen and may have spread to other areas or organs.
    More Information
    - Colon Cancer Treatment
    - Rectal Cancer Treatment
    Stage IV colon cancer. Cancer has spread to other parts of the body, such as the lung, liver, abdominal wall, ovary (in females), or distant lymph nodes.
    Stage IV colon cancer; drawing shows other parts of the body where colon cancer may spread, including the distant lymph nodes, lung, liver, and abdominal wall. An inset shows cancer cells spreading from the colon, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
    Stage IV rectal cancer. Cancer has spread to other parts of the body, such as the lung, liver, abdominal wall, prostate, or distant lymph nodes.
    Stage IV rectal cancer; drawing shows other parts of the body where rectal cancer may spread, including the distant lymph nodes, lung, liver, abdominal wall, and prostate. An inset shows cancer cells spreading from the rectum, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV cutaneous T-cell lymphoma: (... kyoo-TAY-nee-us T-sel lim-FOH-muh)
    Pronunciation of dictionary term "stage IV cutaneous T-cell lymphoma"
    Stage IV cutaneous T-cell lymphoma may be either of the following: in stage IVA cancer, the skin is red, dry, and scaly, and the lymph nodes contain cancer cells; in stage IVB cancer, the skin is red, dry and scaly, cancer cells may be found in lymph nodes, and cancer has spread to other organs in the body.
  stage IV distal bile duct cancer: (... DIS-tul bile dukt KAN-ser)
    Pronunciation of dictionary term "stage IV distal bile duct cancer"
    Cancer has spread to other parts of the body, such as the liver, lungs, or tissue lining the wall of the abdomen and most organs in the abdomen.
    More Information
    - Bile Duct Cancer Stages
  stage IV endometrial cancer: (... EN-doh-MEE-tree-ul KAN-ser)
    Pronunciation of dictionary term "stage IV endometrial cancer"
    Cancer has spread beyond the pelvis. Stage IV is divided into stages IVA and IVB, based on how far the cancer has spread. In stage IVA, cancer has spread to the bladder and/or bowel wall. In stage IVB, cancer has spread to other parts of the body beyond the pelvis, including the abdomen and/or lymph nodes in the groin.
    More Information
    - Endometrial Cancer Treatment
    Stage IVA endometrial cancer. Cancer has spread into the bladder and/or bowel.
    Stage IVA endometrial cancer shown in a side-view cross-section drawing of the uterus, bladder, cervix, vagina, small intestine, and large intestine. Cancer is shown in the bladder, uterus, and bowel.
    Stage IVB endometrial cancer. The cancer has spread to parts of the body outside the pelvis, including the abdomen and/or lymph nodes in the groin.
    Stage IVB endometrial cancer; drawing shows cancer that has spread to parts of the body outside the pelvis, including the abdomen and lymph nodes in the groin. An inset shows cancer cells spreading from the endometrium, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV endometrial stromal sarcoma: (... EN-doh-MEE-tree-ul STROH-mul sar-KOH-muh)
    Pronunciation of dictionary term "stage IV endometrial stromal sarcoma"
    Stage IV is divided into stages IVA and IVB. In stage IVA, the tumor has spread to the bladder and/or the rectum. In stage IVB, the tumor has spread to distant parts of the body.
    More Information
    - Uterine Sarcoma Treatment
  stage IV esophageal adenocarcinoma: (... ee-SAH-fuh-JEE-ul A-deh-noh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IV esophageal adenocarcinoma"
    Stage IV is divided into stages IVA and IVB, depending on where the cancer has spread. In stage IVA, cancer has spread (1) into the diaphragm, pleura, sac around the heart, azygos vein, or peritoneum. Cancer is found in 3 to 6 lymph nodes near the tumor; or (2) into nearby structures, such as the aorta, airway, or spine. Cancer may be found in 0 to 6 lymph nodes near the tumor; or (3) to 7 or more lymph nodes near the tumor. In stage IVB, cancer has spread to other parts of the body, such as the liver or lung.
    More Information
    - Esophageal Cancer Treatment
    Stage IVA adenocarcinoma of the esophagus (1). Cancer has spread into the (a) diaphragm, (b) azygos vein, (c) pleura, (d) sac around the heart, or peritoneum (not shown). Cancer is found in 3 to 6 lymph nodes near the tumor.
    Stage IVA adenocarcinoma of the esophagus (1); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown is cancer in 3 lymph nodes near the tumor. The airway, lung, aorta, chest wall, heart, and rib are also shown.
    Stage IVA adenocarcinoma of the esophagus (2). Cancer has spread into nearby structures, such as the airway, aorta, or spine. Cancer may be found in 0 to 6 lymph nodes near the tumor.
    Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
    Stage IVA adenocarcinoma of the esophagus (3). Cancer has spread to 7 or more lymph nodes near the tumor.
    Stage IVA adenocarcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
    Stage IVB adenocarcinoma of the esophagus. Cancer has spread to other parts of the body, such as the liver or lung.
    Stage IVB adenocarcinoma of the esophagus; drawing showing other parts of the body where esophagus cancer may spread, including the lung and liver. An inset shows cancer cells spreading from the esophagus, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV esophageal squamous cell carcinoma: (... ee-SAH-fuh-JEE-ul SKWAY-mus sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IV esophageal squamous cell carcinoma"
    Stage IV is divided into stages IVA and IVB, depending on where the cancer has spread. In stage IVA, cancer has spread (1) into the diaphragm, pleura, sac around the heart, azygos vein, or peritoneum. Cancer is found in 3 to 6 lymph nodes near the tumor; or (2) into nearby structures, such as the aorta, airway, or spine. Cancer may be found in 0 to 6 lymph nodes near the tumor; or (3) to 7 or more lymph nodes near the tumor. In stage IVB, cancer has spread to other parts of the body, such as the liver or lung.
    More Information
    - Esophageal Cancer Treatment
    Stage IVA squamous cell carcinoma of the esophagus (1). Cancer has spread into the (a) diaphragm, (b) azygos vein, (c) pleura, (d) sac around the heart, or peritoneum (not shown). Cancer is found in 3 to 6 lymph nodes near the tumor.
    Stage IVA squamous cell carcinoma of the esophagus (1); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown is cancer in 3 lymph nodes near the tumor. The airway, lung, aorta, chest wall, heart, and rib are also shown.
    Stage IVA squamous cell carcinoma of the esophagus (2). Cancer has spread into nearby structures, such as the airway, aorta, or spine. Cancer may be found in 0 to 6 lymph nodes near the tumor.
    Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
    Stage IVA squamous cell carcinoma of the esophagus (3). Cancer has spread to 7 or more lymph nodes near the tumor.
    Stage IVA squamous cell carcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
    Stage IVB squamous cell carcinoma of the esophagus. Cancer has spread to other parts of the body, such as the liver or lung.
    Stage IVB squamous cell carcinoma of the esophagus; drawing shows other parts of the body where esophagus cancer may spread, including the lung and liver. An inset shows cancer cells spreading from the esophagus, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV gallbladder cancer: (... GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "stage IV gallbladder cancer"
    Stage IV is divided into stages IVA and IVB. In stage IVA, cancer has spread to the portal vein or hepatic artery or to two or more organs or structures other than the liver. Cancer may have spread to one to three nearby lymph nodes. In stage IVB, cancer may have spread to nearby organs or structures. Cancer has spread to (1) four or more nearby lymph nodes; or (2) other parts of the body, such as the peritoneum and liver.
    More Information
    - Gallbladder Cancer Treatment
  stage IV gastric cancer: (... GAS-trik KAN-ser)
    Pronunciation of dictionary term "stage IV gastric cancer"
    Cancer has spread to other parts of the body, such as the lungs, liver, distant lymph nodes, and the tissue that lines the abdomen wall. Also called stage IV stomach cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage IV gestational trophoblastic neoplasia: (... jeh-STAY-shuh-nul troh-fuh-BLAS-tik NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "stage IV gestational trophoblastic neoplasia"
    The tumor has spread to distant parts of the body other than the lungs.
    More Information
    - Gestational Trophoblastic Disease Treatment
  stage IV HPV-negative oropharyngeal cancer: (... NEH-guh-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IV HPV-negative oropharyngeal cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVA, cancer (1) has spread to the larynx (voice box), front part of the roof of the mouth, lower jaw, or muscles that move the tongue. Cancer may have spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor; or (2) is any size and may have spread to the top of the epiglottis, larynx, front part of the roof of the mouth, lower jaw, or muscles that move the tongue. Cancer has spread to one of the following: (a) one lymph node that is larger than 3 centimeters but not larger than 6 centimeters, on the same side of the neck as the primary tumor; or (b) more than one lymph node that is 6 centimeters or smaller, anywhere in the neck. In stage IVB, cancer (1) has spread to the muscle that moves the lower jaw, the bone attached to the muscle that moves the lower jaw, the base of the skull, or to the area behind the nose or around the carotid artery. Cancer may have spread to lymph nodes in the neck; or (2) may be any size and may have spread to other parts of the head or neck. Cancer has spread to a lymph node that is larger than 6 centimeters or has spread through the outside covering of a lymph node into nearby connective tissue. In stage IVC, cancer has spread to other parts of the body, such as the lung, liver, or bone.
    More Information
    - Oropharyngeal Cancer Treatment
  stage IV HPV-positive oropharyngeal cancer: (… PAH-zih-tiv OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IV HPV-positive oropharyngeal cancer"
    Cancer has spread to other parts of the body, such as the lung or bone.
    More Information
    - Oropharyngeal Cancer Treatment
  stage IV hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IV hypopharyngeal cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVA, cancer (1) has spread to cartilage around the thyroid or trachea, the bone under the tongue, the thyroid, or nearby soft tissue. Cancer may have spread to one lymph node on the same side of the neck as the tumor and the lymph node is 3 centimeters or smaller; or (2) has spread to one lymph node on the same side of the neck as the tumor (the lymph node is larger than 3 centimeters but not larger than 6 centimeters) or to lymph nodes anywhere in the neck (affected lymph nodes are 6 centimeters or smaller), and one of the following is true: (1) cancer is found in one area of the hypopharynx and/or is 2 centimeters or smaller; or (2) cancer is found in more than one area of the hypopharynx or in nearby tissues, or is larger than 2 centimeters but not larger than 4 centimeters and has not spread to the larynx (voice box); or (3) cancer has spread to the larynx or esophagus and is more than 4 centimeters; or (4) cancer has spread to cartilage around the thyroid or trachea, the bone under the tongue, the thyroid, or nearby soft tissue. In stage IVB, the tumor (1) has spread to muscles around the upper part of the spinal column, the carotid artery, or the lining of the chest cavity and may have spread to lymph nodes, which can be any size; or (2) may be any size and has spread to one or more lymph nodes that are larger than 6 centimeters. In stage IVC, the tumor may be any size and has spread beyond the hypopharynx to other parts of the body.
    More Information
    - Hypopharyngeal Cancer Treatment (Adult)
  stage IV intrahepatic bile duct cancer: (... IN-truh-heh-PA-tik bile dukt KAN-ser)
    Pronunciation of dictionary term "stage IV intrahepatic bile duct cancer"
    Cancer has spread to other parts of the body, such as the bone, lungs, distant lymph nodes, or tissue lining the wall of the abdomen and most organs in the abdomen.
    More Information
    - Bile Duct Cancer Stages
  stage IV intraocular melanoma of the ciliary body and choroid: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... SIH-lee-ayr-ee BAH-dee ... KOR-oyd)
    Pronunciation of dictionary term "stage IV intraocular melanoma of the ciliary body and choroid"
    The tumor may be any size and has spread (1) to one or more nearby lymph nodes or to the eye socket separate from the primary tumor; or (2) to other parts of the body, such as the liver, lung, bone, brain, or tissue under the skin.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IV intraocular melanoma of the iris: (... IN-truh-AH-kyoo-ler MEH-luh-NOH-muh ... I-ris)
    Pronunciation of dictionary term "stage IV intraocular melanoma of the iris"
    The tumor may be any size and has spread (1) to nearby lymph nodes; or (2) to other parts of the body.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
  stage IV kidney cancer: (... KID-nee KAN-ser)
    Pronunciation of dictionary term "stage IV kidney cancer"
    Cancer has spread (1) beyond the layer of fatty tissue around the kidney and may have spread into the adrenal gland above the kidney with cancer or to nearby lymph nodes; or (2) to other parts of the body, such as the bones, liver, lungs, brain, adrenal glands, or distant lymph nodes. Also called stage IV renal cell cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage IV kidney cancer. Cancer has spread a) beyond the layer of fatty tissue around the kidney and may have spread into the adrenal gland above the kidney with cancer or to nearby lymph nodes, or b) to other parts of the body, such as the brain, lung, liver, adrenal gland, bone, or distant lymph nodes.
    Stage IV kidney cancer; drawing shows cancer that has spread beyond the layer of fatty tissue around the left kidney to a) the adrenal gland above the left kidney. Also shown are the lymph nodes, right adrenal gland, and right kidney. An inset shows b) other parts of the body where kidney cancer may spread, including the brain, lung, liver, adrenal gland, bone, and distant lymph nodes.
  stage IV laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IV laryngeal cancer"
    Stage IV is divided into stage IVA, stage IVB, and stage IVC. In stage IVA, (1) cancer has spread through the thyroid cartilage and/or has spread to tissues beyond the larynx, such as the neck, trachea, thyroid, or esophagus; cancer may have spread to one lymph node on the same side of the neck as the original tumor and the lymph node is 3 centimeters or smaller; or (2) cancer has spread to one lymph node on the same side of the neck as the original tumor and the lymph node is larger than 3 centimeters but not larger than 6 centimeters, or has spread to more than one lymph node anywhere in the neck with none larger than 6 centimeters; cancer may have spread to tissues beyond the larynx, such as the neck, trachea, thyroid, or esophagus. The vocal cords may not move normally. In stage IVB, (1) cancer has spread to the space in front of the spinal column, surrounds the carotid artery, or has spread to parts of the chest; cancer may have spread to one or more lymph nodes anywhere in the neck and the lymph nodes may be any size; or (2) cancer has spread to a lymph node that is larger than 6 centimeters and may have spread as far as the space in front of the spinal column, around the carotid artery, or to parts of the chest. The vocal cords may not move normally. In stage IVC, cancer has spread to other parts of the body, such as the lungs, liver, or bone.
    More Information
    - Laryngeal Cancer Treatment (Adult)
  stage IV leiomyosarcoma of the uterus: (... LY-oh-MY-oh-sar-KOH-muh ... YOO-ter-us)
    Pronunciation of dictionary term "stage IV leiomyosarcoma of the uterus"
    Stage IV is divided into stages IVA and IVB. In stage IVA, the tumor has spread to the bladder and/or the rectum. In stage IVB, the tumor has spread to distant parts of the body.
    More Information
    - Uterine Sarcoma Treatment
  stage IV lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage IV lip and oral cavity cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVA, (1) the tumor has spread through tissue in the lip or oral cavity into nearby tissue and/or bone (jaw, tongue, floor of mouth, maxillary sinus, or skin of chin or nose); cancer may have spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the tumor; or (2) the tumor is any size or has spread through tissue in the lip or oral cavity into nearby tissue and/or bone (jaw, tongue, floor of mouth, maxillary sinus, or skin of chin or nose). Cancer has spread to one lymph node on the same side of the neck as the tumor and the lymph node is larger than 3 centimeters but not larger than 6 centimeters, or to more than one lymph node on the same side of the neck as the tumor and the lymph nodes are not larger than 6 centimeters, or to lymph nodes on the opposite side of the neck as the tumor or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters. In stage IVB, (1) the tumor may be any size and has spread to one or more lymph nodes that are larger than 6 centimeters; or (2) the tumor has spread further into the muscles or bones in the oral cavity, or to the base of the skull and/or the carotid artery. Cancer may have spread to one or more lymph nodes anywhere in the neck. In stage IVC, the tumor has spread beyond the lip or oral cavity to distant parts of the body, such as the lungs. The tumor may be any size and may have spread to lymph nodes.
    More Information
    - Lip and Oral Cavity Cancer Treatment (Adult)
  stage IV malignant pleural mesothelioma: (...muh-LIG-nunt PLOOR-ul MEH-zoh-THEE-lee-OH-muh)
    Pronunciation of dictionary term "stage IV malignant pleural mesothelioma"
    Cancer has spread to tissue covering the lung or the lung on the opposite side of the chest, peritoneum, bones, liver, lymph nodes outside the chest, or to other parts of the body.
    More Information
    - Malignant Mesothelioma Treatment
  stage IV maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IV maxillary sinus cancer"
    Stage IV maxillary sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVA, cancer (1) has spread to one lymph node on the same side of the neck as the cancer and the lymph node is larger than 3 centimeters but not larger than 6 centimeters; or to more than one lymph node on the same side of the neck as the original tumor and the lymph nodes are not larger than 6 centimeters; or to lymph nodes on the opposite side of the neck as the original tumor or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters, and cancer has also spread to any of the following: the lining of the maxillary sinus, bones around the maxillary sinus (including the roof of the mouth and the nose), tissues under the skin, the eye socket, the base of the skull, and/or the ethmoid sinuses; or (2) has spread to any of the following: the front of the eye, skin of the cheek, base of the skull, behind the jaw, the bone between the eyes, and/or the sphenoid or frontal sinuses, and cancer may also have spread to one or more lymph nodes 6 centimeters or smaller, anywhere in the neck. In stage IVB, cancer (1) has spread to any of the following: the back of the eye, brain, middle parts of the skull, nerves in the head that go to the brain, upper part of the throat behind the nose, and/or the base of the skull, and cancer may be found in one or more lymph nodes of any size, anywhere in the neck; or (2) is found in a lymph node larger than 6 centimeters. Cancer may also be found anywhere in or near the maxillary sinus. In stage IVC, cancer may be anywhere in or near the maxillary sinus, may have spread to lymph nodes, and has spread to organs far away from the maxillary sinus, such as the lungs.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment (Adult)
  stage IV medullary thyroid cancer: (... MED-yoo-LAYR-ee THY-royd KAN-ser)
    Pronunciation of dictionary term "stage IV medullary thyroid cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVA, the tumor is any size and (1) cancer has spread from the thyroid to soft tissue under the skin, the esophagus, the trachea, the larynx, or the recurrent laryngeal nerve (a nerve that goes to the larynx); cancer may have spread to lymph nodes on one or both sides of the neck; or (2) cancer may have spread from the thyroid to nearby muscles in the neck; cancer has spread to lymph nodes on one or both sides of the neck. In stage IVB, the tumor is any size and cancer has spread to tissue in front of the spine or to the spine or has surrounded the carotid artery or the blood vessels in the area between the lungs. Cancer may have spread to lymph nodes. In stage IVC, the tumor is any size and cancer has spread to other parts of the body, such as the lungs or liver. Cancer may have spread to lymph nodes.
    More Information
    - Thyroid Cancer Treatment
    Stage IVA medullary thyroid cancer. The tumor is any size and cancer has spread from the thyroid to soft tissue under the skin, the esophagus, the trachea, the larynx, or the recurrent laryngeal nerve (a nerve that goes to the larynx), and cancer may have spread to lymph nodes on one or both sides of the neck; or cancer may have spread from the thyroid to nearby muscles in the neck, and cancer has spread to lymph nodes on one or both sides of the neck.
    Stage IVA medullary thyroid cancer; drawing shows cancer in the thyroid gland and in the larynx, the esophagus, the left recurrent laryngeal nerve, the trachea, and a lymph node on one side of the neck. Also shown is the right recurrent laryngeal nerve.
    Stage IVB medullary thyroid cancer. The tumor is any size and cancer has (a) spread to tissue in front of the spine or to the spine; or (b) surrounded the carotid artery; or (c) surrounded the blood vessels in the area between the lungs. Cancer may have spread to lymph nodes.
    Stage IVB medullary thyroid cancer; drawing shows cancer has (a) spread from the thyroid gland to tissue in front of the spine and to the spine (inset), (b) surrounded the common carotid artery, and (c) surrounded the blood vessels in the area between the lungs. Also shown are the lymph nodes and trachea.
    Stage IVC medullary thyroid cancer. The tumor is any size and cancer has spread to other parts of the body, such as the lung or liver. Cancer may have spread to lymph nodes.
    Stage IVC medullary thyroid cancer; drawing shows other parts of the body where thyroid cancer may spread, including the lung and liver. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV melanoma: (... MEH-luh-NOH-muh)
    Pronunciation of dictionary term "stage IV melanoma"
    Cancer has spread to other parts of the body, such as the lung, liver, brain, spinal cord, bone, soft tissue (including muscle), gastrointestinal tract, and/or distant lymph nodes. Cancer may have spread to places in the skin far away from where it first started.
    More Information
    - Melanoma Treatment
    Stage IV melanoma. Cancer has spread to other parts of the body, such as the brain, spinal cord, lung, liver, gastrointestinal (GI) tract, bone, muscle, and/or distant lymph nodes. Cancer may have spread to places in the skin far away from where it first started.
    Stage IV melanoma; drawing shows other parts of the body where melanoma may spread, including the brain, spinal cord, lung, liver, gastrointestinal (GI) tract, bone, muscle, and distant lymph nodes. An inset shows cancer cells spreading through the blood and lymph system to another part of the body where a metastatic tumor has formed.
  stage IV Merkel cell carcinoma: (stayj … MER-kul sel KAR-sih-NOH-muh)
    Pronunciation of dictionary term "stage IV Merkel cell carcinoma"
    The tumor has spread to skin that is not close to the primary tumor or to other parts of the body, such as the liver, lung, bone, or brain.
    More Information
    - Merkel Cell Carcinoma Treatment
  stage IV mycosis fungoides/Sézary syndrome: (... my-KOH-sis fun-GOY-deez/sey-zah-REE SIN-drome)
    Pronunciation of dictionary term "stage IV mycosis fungoides/Sezary syndrome"
    When there is a high number of Sézary cells in the blood, the disease is called Sézary syndrome. Stage IV is divided into stages IVA1, IVA2, and IVB. In stage IVA1, patches, papules, plaques, or tumors may cover any amount of the skin surface, and 80% or more of the skin surface may be reddened. The lymph nodes may be abnormal, but they are not cancerous. There is a high number of Sézary cells in the blood. In stage IVA2, patches, papules, plaques, or tumors may cover any amount of the skin surface, and 80% or more of the skin surface may be reddened. The lymph nodes are very abnormal, or cancer has formed in the lymph nodes. There may be a high number of Sézary cells in the blood. In stage IVB, cancer has spread to other organs in the body, such as the spleen or liver. Patches, papules, plaques, or tumors may cover any amount of the skin surface, and 80% or more of the skin surface may be reddened. The lymph nodes may be abnormal or cancerous. There may be a high number of Sézary cells in the blood.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  stage IV nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IV nasal cavity and ethmoid sinus cancer"
    Stage IV nasal cavity and ethmoid sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVA, cancer (1) has spread to one lymph node on the same side of the neck as the cancer and the lymph node is larger than 3 centimeters but not larger than 6 centimeters; or to more than one lymph node on the same side of the neck as the original tumor and the lymph nodes are not larger than 6 centimeters; or to lymph nodes on the opposite side of the neck as the original tumor or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters, and cancer has also spread to any of the following: the nasal cavity, ethmoid sinus, eye socket, maxillary sinus, roof of the mouth, and/or the bone between the eyes; or (2) has spread to any of the following: the front of the eye, skin of the nose or cheek, front parts of the skull, base of the skull, and/or the sphenoid or frontal sinuses, and cancer may also have spread to one or more lymph nodes 6 centimeters or smaller, anywhere in the neck. In stage IVB, cancer (1) has spread to any of the following: the back of the eye, brain, middle parts of the skull, nerves in the head that go to the brain, upper part of the throat behind the nose, and/or the base of the skull, and cancer may be found in one or more lymph nodes of any size, anywhere in the neck; or (2) is found in a lymph node larger than 6 centimeters. Cancer may also be found anywhere in or near the nasal cavity and ethmoid sinus. In stage IVC, cancer may be found anywhere in or near the nasal cavity and ethmoid sinus, may have spread to lymph nodes, and has spread to organs far away from the nasal cavity and ethmoid sinus, such as the lungs.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment (Adult)
  stage IV nasopharyngeal cancer: (...NAY-zoh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IV nasopharyngeal cancer"
    Stage IV nasopharyngeal cancer is divided into stages IVA and IVB. In stage IVA, (1) cancer has spread to the brain, the cranial nerves, the hypopharynx, the salivary gland in the front of the ear, the bone around the eye, and/or the soft tissues of the jaw. Cancer may have also spread to one or more lymph nodes on one or both sides of the neck and/or the back of the throat. The affected lymph nodes are 6 centimeters or smaller; or (2) cancer has spread to one or more lymph nodes on one or both sides of the neck. The affected lymph nodes are larger than 6 centimeters and/or are found in the lowest part of the neck. In stage IVB, cancer has spread beyond the lymph nodes in the neck to distant lymph nodes, such as those between the lungs, below the collarbone, or in the armpit or groin, or to other parts of the body, such as the lung, bone, or liver.
    More Information
    - Nasopharyngeal Cancer Treatment
  stage IV non-small cell lung cancer: (... sel lung KAN-ser)
    Pronunciation of dictionary term "stage IV non-small cell lung cancer"
    Stage IV non-small cell lung cancer is divided into stages IVA and IVB. In stage IVA, the tumor may be any size and cancer may have spread to the lymph nodes. One or more of the following is found: (1) there are one or more tumors in the lung that does not have the primary tumor; and/or (2) cancer is found in the lining around the lungs or the sac around the heart; and/or (3) cancer is found in fluid around the lungs or the heart; and/or (4) cancer has spread to one place in an organ not near the lung, such as the brain, liver, adrenal gland, kidney, or bone, or to a lymph node that is not near the lung. In stage IVB, cancer has spread to multiple places in one or more organs that are not near the lung.
    More Information
    - Non-Small Cell Lung Cancer Treatment
    Stage IVA lung cancer. The tumor may be any size and cancer may have spread to the lymph nodes. One or more of the following is found: (a) there are one or more tumors in the lung that does not have the primary tumor; and/or (b) cancer is found in fluid around the lungs or heart or there are cancer nodules in the lining around the lungs or the sac around the heart; and/or (c) cancer has spread to one place in an organ or tissue not near the lung, such as the brain, adrenal gland, kidney, liver, or bone, or to a lymph node that is not near the lung.
    Stage IVA lung cancer; drawing shows a primary tumor in the right lung and (a) a tumor in the left lung. Also shown is (b) fluid or cancer nodules around the lungs or heart (inset), and (c) other organs or tissues where lung cancer may spread, including the brain, adrenal gland, kidney, liver, bone, and distant lymph nodes.
    Stage IVB lung cancer. The cancer has spread to multiple places in one or more organs that are not near the lung, such as the brain, adrenal gland, kidney, liver, distant lymph nodes, or bone.
    Stage IVB lung cancer; drawing shows a primary cancer in the right lung and other parts of the body where lung cancer may spread, including the brain, adrenal gland, kidney, liver, distant lymph nodes, and bone. An inset shows cancer cells spreading from the lung, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV nonmelanoma skin cancer on the eyelid: (... non-MEH-luh-NOH-muh skin KAN-ser ... I-lid)
    Pronunciation of dictionary term "stage IV nonmelanoma skin cancer on the eyelid"
    The tumor has spread to other parts of the body, such as the lung or liver.
    More Information
    - Skin Cancer Treatment
  stage IV nonmelanoma skin cancer on the head and neck (not on the eyelid): (… non-MEH-luh-NOH-muh skin KAN-ser ...)
    Pronunciation of dictionary term "stage IV nonmelanoma skin cancer on the head and neck (not on the eyelid)"
    One of the following is found: (1) the tumor is any size and cancer may have spread to the bone and the bone has minor damage, or to tissue covering the nerves below the dermis, or below the subcutaneous tissue. Cancer has spread to the lymph nodes as follows: (a) one lymph node on the same side of the body as the tumor, the affected node is 3 centimeters or smaller, and cancer has spread through to the outside covering of the lymph node; or (b) one lymph node on the same side of the body as the tumor, the affected node is larger than 3 centimeters but not larger than 6 centimeters, and cancer has not spread through to the outside covering of the lymph node; or (c) more than one lymph node on the same side of the body as the tumor, the affected nodes are 6 centimeters or smaller, and cancer has not spread through to the outside covering of the lymph nodes; or (d) one or more lymph nodes on the opposite side of the body as the tumor or on both sides of the body, the affected nodes are 6 centimeters or smaller, and cancer has not spread through to the outside covering of the lymph nodes; OR (2) the tumor is any size and cancer may have spread to tissue covering the nerves below the dermis, or below the subcutaneous tissue, or to bone marrow or to bone, including the bottom of the skull, and one of the following is found: (a) cancer has spread to one lymph node that is larger than 6 centimeters and cancer has not spread through to the outside covering of the lymph node; or (b) cancer has spread to one lymph node on the same side of the body as the tumor, the affected node is larger than 3 centimeters, and cancer has spread through to the outside covering of the lymph node; or (c) cancer has spread to one lymph node on the opposite side of the body as the tumor, the affected node is any size, and cancer has spread through to the outside covering of the lymph node; or (d) cancer has spread to more than one lymph node on one or both sides of the body and cancer has spread through to the outside covering of the lymph nodes; OR (3) the tumor is any size and cancer has spread to bone marrow or to bone, including the bottom of the skull, and the bone has been damaged. Cancer may have also spread to the lymph nodes; OR (4) cancer has spread to other parts of the body, such as the lung.
    More Information
    - Skin Cancer Treatment
    Stage IV nonmelanoma skin cancer of the head and neck (1). The tumor is any size. Cancer may have spread to the bone and the bone has minor damage, or to tissue covering the nerves below the dermis, or below the subcutaneous tissue. Cancer has spread to: (a) one lymph node on the same side of the body as the tumor, the node is 3 centimeters or smaller, and cancer has spread through to the outside covering of the lymph node; or (b) one lymph node on the same side of the body as the tumor, the node is larger than 3 centimeters but not larger than 6 centimeters, and cancer has not spread through to the outside covering of the lymph node; or (c) more than one lymph node on the same side of the body as the tumor, the nodes are 6 centimeters or smaller, and cancer has not spread through to the outside covering of the lymph nodes; or (d) one or more lymph nodes on the opposite side of the body as the tumor or on both sides of the body, the nodes are 6 centimeters or smaller, and cancer has not spread through to the outside covering of the lymph nodes.
    Stage IV nonmelanoma skin cancer of the head and neck (1); drawing shows a primary tumor on the face and cancer that has spread to: (a) one lymph node on the same side of the body as the tumor, the node is 3 centimeters or smaller, and cancer has spread through to the outside covering of the lymph node; (b) one lymph node on the same side of the body as the tumor and the node is larger than 3 centimeters but not larger than 6 centimeters; (c) more than one lymph node on the same side of the body as the tumor and the nodes are 6 centimeters or smaller; and (d) one or more lymph nodes on the opposite or both sides of the body as the tumor and the nodes are 6 centimeters or smaller. Also shown is a 10-centimeter ruler and a 4-inch ruler.
    Stage IV nonmelanoma skin cancer of the head and neck (2). The tumor is any size and cancer has spread to: (a) one lymph node that is larger than 6 centimeters and cancer has not spread through to the outside covering of the lymph node; or (b) one lymph node on the same side of the body as the tumor, the affected node is larger than 3 centimeters, and cancer has spread through to the outside covering of the lymph node; or (c) one lymph node on the opposite side of the body as the tumor, the affected node is any size, and cancer has spread through to the outside covering of the lymph node; or (d) more than one lymph node on one or both sides of the body and cancer has spread through to the outside covering of the lymph nodes.
    Stage IV nonmelanoma skin cancer of the head and neck (2); drawing shows a primary skin tumor on the face and cancer that has spread to: (a) one lymph node that is larger than 6 centimeters; (b) one lymph node on the same side of the body as the tumor, the affected node is larger than 3 centimeters, and cancer has spread through to the outside covering of the lymph node; (c) one lymph node on the opposite side of the body as the tumor, the affected node is any size, and cancer has spread through to the outside covering of the lymph node; and (d) more than one lymph node on one or both sides of the body and cancer has spread through to the outside covering of the lymph nodes. Also shown is a 10-centimeter ruler and a 4-inch ruler.
    Stage IV nonmelanoma skin cancer of the head and neck (3). The tumor is any size and cancer has spread to bone marrow or to bone, including the base of the skull, and the bone has been damaged; or cancer has spread to other parts of the body, such as the lung.
    Stage IV nonmelanoma skin cancer of the head and neck (3); drawing shows a primary skin tumor on the face and other parts of the body where nonmelanoma skin cancer may spread, including the base of the skull, the lung, the bone, and the bone marrow. An inset shows cancer cells spreading through the blood and lymph system to another part of the body where metastatic cancer has formed.
  stage IV oropharyngeal cancer: (... OR-oh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IV oropharyngeal cancer"
    Stage IV oropharyngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVA, cancer (1) has spread to the larynx, front part of the roof of the mouth, lower jaw, or muscles that move the tongue or are used for chewing. Cancer may have spread to one lymph node on the same side of the neck as the tumor and the lymph node is 3 centimeters or smaller; or (2) has spread to one lymph node on the same side of the neck as the tumor (the lymph node is larger than 3 centimeters but not larger than 6 centimeters) or to more than one lymph node anywhere in the neck (the lymph nodes are 6 centimeters or smaller), and one of the following is true: (1) tumor in the oropharynx is any size and may have spread to the epiglottis (the flap that covers the trachea during swallowing); or (2) tumor has spread to the larynx, front part of the roof of the mouth, lower jaw, or muscles that move the tongue or are used for chewing. In stage IVB, the tumor (1) surrounds the carotid artery or has spread to the muscle that opens the jaw, the bone attached to the muscles that move the jaw, nasopharynx, or base of the skull. Cancer may have spread to one or more lymph nodes, which can be any size; or (2) may be any size and has spread to one or more lymph nodes that are larger than 6 centimeters. In stage IVC, the tumor may be any size and has spread beyond the oropharynx to other parts of the body, such as the lung, bone, or liver.
    More Information
    - Oropharyngeal Cancer Treatment (Adult)
  stage IV ovarian borderline tumor: (… oh-VAYR-ee-un BOR-der-line TOO-mer)
    Tumor cells have spread beyond the abdomen to other parts of the body. Stage IV is divided into stages IVA and IVB. In stage IVA, tumor cells are found in extra fluid that builds up around the lungs. In stage IVB, the tumor has spread to organs and tissues outside the abdomen, including lymph nodes in the groin. Also called stage IV ovarian low malignant potential tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage IV ovarian epithelial, fallopian tube, and primary peritoneal cancer: (... oh-VAYR-ee-un EH-pih-THEE-lee-ul fuh-LOH-pee-in ... PRY-mayr-ee PAYR-ih-toh-NEE-ul KAN-ser)
    Pronunciation of dictionary term "stage IV ovarian epithelial, fallopian tube, and primary peritoneal cancer"
    Cancer has spread beyond the abdomen to other parts of the body. Stage IV is divided into stages IVA and IVB. In stage IVA, cancer cells are found in extra fluid that builds up around the lungs. In stage IVB, cancer has spread to organs and tissues outside the abdomen, including lymph nodes in the groin.
    More Information
    - Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment
    In stage IV, cancer has spread beyond the abdomen to other parts of the body. In stage IVA, cancer cells are found in extra fluid that builds up around the lungs. In stage IVB, cancer has spread to organs and tissues outside the abdomen, including the lung, liver, and lymph nodes in the groin.
    Drawing of stage IV shows other parts of the body where ovarian cancer may spread, including the lung, liver, and lymph nodes in the groin. An inset on the top shows extra fluid around the lung. An inset on the bottom shows cancer cells spreading through the blood and lymph system to another part of the body where metastatic cancer has formed.
  stage IV ovarian germ cell tumor: (...oh-VAYR-ee-un jerm sel TOO-mer)
    Pronunciation of dictionary term "stage IV ovarian germ cell tumor"
    Cancer has spread beyond the abdomen to other parts of the body. Stage IV is divided into stages IVA and IVB. In stage IVA, cancer cells are found in extra fluid that builds up around the lungs. In stage IVB, cancer has spread to organs and tissues outside the abdomen, including lymph nodes in the groin.
    More Information
    - Ovarian Germ Cell Tumors Treatment
    In stage IV, cancer has spread beyond the abdomen to other parts of the body. In stage IVA, cancer cells are found in extra fluid that builds up around the lungs. In stage IVB, cancer has spread to organs and tissues outside the abdomen, including the lung, liver, and lymph nodes in the groin.
    Drawing of stage IV shows other parts of the body where ovarian cancer may spread, including the lung, liver, and lymph nodes in the groin. An inset on the top shows extra fluid around the lung. An inset on the bottom shows cancer cells spreading through the blood and lymph system to another part of the body where metastatic cancer has formed.
  stage IV ovarian low malignant potential tumor: (… oh-VAYR-ee-un...muh-LIG-nunt poh-TEN-shul TOO-mer)
    Pronunciation of dictionary term "stage IV ovarian low malignant potential tumor"
    Tumor cells have spread beyond the abdomen to other parts of the body. Stage IV is divided into stages IVA and IVB. In stage IVA, tumor cells are found in extra fluid that builds up around the lungs. In stage IVB, the tumor has spread to organs and tissues outside the abdomen, including lymph nodes in the groin. Also called stage IV ovarian borderline tumor.
    More Information
    - Ovarian Borderline Tumors Treatment
  stage IV pancreatic cancer: (... PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "stage IV pancreatic cancer"
    The tumor is any size and cancer has spread to other parts of the body, such as the liver, lung, or peritoneal cavity (the body cavity that contains most of the organs in the abdomen).
    More Information
    - Pancreatic Cancer Treatment
    Stage IV pancreatic cancer. The tumor is any size and cancer has spread to other parts of the body, such as the lung, liver, or peritoneal cavity (the body cavity that contains most of the organs in the abdomen).
    Stage IV pancreatic cancer; drawing shows other parts of the body where pancreatic cancer may spread, including the lung, liver, and peritoneal cavity. An inset shows cancer cells spreading from the pancreas, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV papillary and follicular thyroid cancer (55 years and older): (... PA-pih-LAYR-ee ... fuh-LIH-kyoo-ler THY-royd KAN-ser ...)
    Pronunciation of dictionary term "stage IV papillary and follicular thyroid cancer (55 years and older)"
    Stage IV is divided into stages IVA and IVB. In stage IVA, the tumor is any size and cancer has spread to tissue in front of the spine or has surrounded the carotid artery or the blood vessels in the area between the lungs. Cancer may have spread to lymph nodes. In stage IVB, the tumor is any size and cancer has spread to other parts of the body, such as the lungs or bones. Cancer may have spread to lymph nodes.
    More Information
    - Thyroid Cancer Treatment
    Stage IVA papillary and follicular thyroid cancer in patients 55 years and older. The tumor is any size and cancer has (a) spread to tissue in front of the spine; or (b) surrounded the carotid artery; or (c) surrounded the blood vessels in the area between the lungs. Cancer may have spread to lymph nodes.
    Stage IVA papillary and follicular thyroid cancer in patients 55 years and older; drawing shows cancer has (a) spread to tissue in front of the spine (inset), (b) surrounded the common carotid artery, and (c) surrounded the blood vessels in the area between the lungs. Also shown are the thyroid gland, trachea, and lymph nodes.
    Stage IVB papillary and follicular thyroid cancer in patients 55 years and older. The tumor is any size and cancer has spread to other parts of the body, such as the lungs or bones. Cancer may have spread to lymph nodes.
    Stage IVB papillary and follicular thyroid cancer in patients 55 years and older; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV penile cancer: (... PEE-nile KAN-ser)
    Pronunciation of dictionary term "stage IV penile cancer"
    Cancer has spread (1) to tissues near the penis, such as the scrotum, prostate, or pubic bone, and may have spread to lymph nodes in the groin or pelvis; or (2) to one or more lymph nodes in the pelvis, or cancer has spread through the outer covering of the lymph nodes to nearby tissue; or (3) to lymph nodes outside the pelvis or to other parts of the body, such as the lung, liver, or bone.
    More Information
    - Penile Cancer Treatment
  stage IV perihilar bile duct cancer: (... PAYR-ee-HY-ler bile dukt KAN-ser)
    Pronunciation of dictionary term "stage IV perihilar bile duct cancer"
    Stage IV is divided into stages IVA and IVB. In stage IVA, cancer has spread to 4 or more nearby lymph nodes. In stage IVB, cancer has spread to other parts of the body, such as the liver, lung, bone, brain, skin, distant lymph nodes, or tissue lining the wall of the abdomen and most organs in the abdomen.
    More Information
    - Bile Duct Cancer Stages
  stage IV prostate cancer: (...PROS-tayt KAN-ser)
    Pronunciation of dictionary term "stage IV prostate cancer"
    Stage IV is divided into stages IVA and IVB. In stage IVA, cancer is found in one or both sides of the prostate and may have spread to the seminal vesicles or to nearby tissue or organs, such as the rectum, bladder, or pelvic wall. Cancer has spread to nearby lymph nodes. The prostate-specific antigen (PSA) can be any level and the Grade Group is 1, 2, 3, 4, or 5 (Gleason score is 10 or less). In stage IVB, cancer has spread to other parts of the body, such as the bones or distant lymph nodes.
    More Information
    - Prostate Cancer Treatment
    Stage IVA prostate cancer. Cancer is found in one or both sides of the prostate and may have spread to the seminal vesicles or to nearby tissue or organs, such as the rectum, bladder, or pelvic wall. Cancer has spread to nearby lymph nodes. The prostate-specific antigen can be any level and the Grade Group is 1, 2, 3, 4, or 5.
    Stage IVA prostate cancer; drawing shows cancer in one side of the prostate and in nearby lymph nodes. The PSA can be any level and the Grade Group is 1 ,2, 3, 4, or 5. Also shown are the bladder, rectum, and urethra.
    Stage IVB prostate cancer. Cancer has spread to other parts of the body, such as the bones or distant lymph nodes.
    Stage IVB prostate cancer; drawing shows other parts of the body where prostate cancer may spread, including the distant lymph nodes and bones. An inset shows cancer cells spreading from the prostate, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IV renal cell cancer: (... REE-nul sel KAN-ser)
    Pronunciation of dictionary term "stage IV renal cell cancer"
    Cancer has spread (1) beyond the layer of fatty tissue around the kidney and may have spread into the adrenal gland above the kidney with cancer or to nearby lymph nodes; or (2) to other parts of the body, such as the bones, liver, lungs, brain, adrenal glands, or distant lymph nodes. Also called stage IV kidney cancer.
    More Information
    - Renal Cell Cancer Treatment
    Stage IV kidney cancer. Cancer has spread a) beyond the layer of fatty tissue around the kidney and may have spread into the adrenal gland above the kidney with cancer or to nearby lymph nodes, or b) to other parts of the body, such as the brain, lung, liver, adrenal gland, bone, or distant lymph nodes.
    Stage IV kidney cancer; drawing shows cancer that has spread beyond the layer of fatty tissue around the left kidney to a) the adrenal gland above the left kidney. Also shown are the lymph nodes, right adrenal gland, and right kidney. An inset shows b) other parts of the body where kidney cancer may spread, including the brain, lung, liver, adrenal gland, bone, and distant lymph nodes.
  stage IV Sezary syndrome: (... say-zah-REE SIN-drome)
    Pronunciation of dictionary term "stage IV Sezary syndrome"
    Stage IV is divided into stages IVA1, IVA2, and IVB. In stage IVA1, patches, papules, plaques, or tumors may cover any amount of the skin surface, and 80% or more of the skin surface may be reddened. The lymph nodes may be abnormal, but they are not cancerous. There is a high number of Sezary cells in the blood. In stage IVA2, patches, papules, plaques, or tumors may cover any amount of the skin surface, and 80% or more of the skin surface may be reddened. The lymph nodes are very abnormal, or cancer has formed in the lymph nodes. There may be a high number of Sezary cells in the blood. In stage IVB, cancer has spread to other organs in the body, such as the spleen or liver. Also called stage IV mycosis fungoides.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
  stage IV stomach cancer: (... STUH-muk KAN-ser)
    Pronunciation of dictionary term "stage IV stomach cancer"
    Cancer has spread to other parts of the body, such as the lungs, liver, distant lymph nodes, and the tissue that lines the abdomen wall. Also called stage IV gastric cancer.
    More Information
    - Stomach Cancer Stages (https://www.cancer.gov/types/stomach/stages)
    Layers of the stomach wall. The wall of the stomach is made up of the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer). The stomach is an organ in the upper abdomen.
    Layers of the stomach wall; drawing of the stomach with an inset showing the layers of the stomach wall, including the mucosa (innermost layer), submucosa, muscle layer, subserosa, and serosa (outermost layer).
  stage IV thymoma: (... thy-MOH-muh)
    Pronunciation of dictionary term "stage IV thymoma"
    Stage IV is divided into stages IVA and IVB, depending on where the cancer has spread. In stage IVA, cancer has spread widely around the lungs and heart. In stage IVB, cancer has spread to the blood or lymph system.
    More Information
    - Thymoma and Thymic Carcinoma Treatment
  stage IV transitional cell cancer of the renal pelvis and ureter: (... tran-ZIH-shuh-nul sel KAN-ser ... REE-nul PEL-vus ... YER-eh-ter)
    Pronunciation of dictionary term "stage IV transitional cell cancer of the renal pelvis and ureter"
    Cancer has spread to at least one of the following: (1) a nearby organ; (2) the layer of fat around the kidney; (3) lymph nodes; and/or (4) other parts of the body, such as the lung, liver, or bone.
    More Information
    - Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
  stage IV uterine sarcoma: (…YOO-teh-rin sar-KOH-muh)
    Pronunciation of dictionary term "stage IV uterine sarcoma"
    Cancer has spread beyond the pelvis. Stage IV is divided into stages IVA and IVB, based on how far the cancer has spread. In stage IVA, cancer has spread to the bladder and/or bowel wall. In stage IVB, cancer has spread to other parts of the body beyond the pelvis, including the abdomen and/or lymph nodes in the groin.
    More Information
    - Uterine Sarcoma Treatment
  stage IV vaginal cancer: (...VA-jih-nul KAN-ser)
    Pronunciation of dictionary term "stage IV vaginal cancer"
    Stage IV is divided into stages IVA and IVB. In stage IVA, cancer may have spread to one or more of the following areas: (1) the lining of the bladder; (2) the lining of the rectum; and/or (3) beyond the area of the pelvis that has the bladder, uterus, ovaries, and cervix. In stage IVB, cancer has spread to parts of the body that are not near the vagina, such as the lung or bone.
    More Information
    - Vaginal Cancer Treatment
  stage IV vulvar cancer: (... VUL-ver KAN-ser)
    Pronunciation of dictionary term "stage IV vulvar cancer"
    The tumor is any size and has become attached to the bone, or cancer has spread to lymph nodes that are not movable or have become ulcerated, or there is distant spread. Stage IV is divided into stages IVA and IVB. In stage IVA, the cancer is attached to the pelvic bone or has spread to lymph nodes in the groin that are not movable or have become ulcerated. In stage IVB, the cancer has spread beyond the pelvis to distant parts of the body.
    More Information
    - Vulvar Cancer Treatment
  stage IV Wilms tumor: (… wilmz TOO-mer)
    Pronunciation of dictionary term "stage IV Wilms tumor"
    Cancer has spread through the blood to organs such as the lungs, liver, bone, or brain, or to lymph nodes outside the abdomen and pelvis.
    More Information
    - Wilms Tumor and Other Childhood Kidney Tumors Treatment
  stage IVA anaplastic thyroid cancer: (... A-nuh-PLAS-tik THY-royd KAN-ser)
    Pronunciation of dictionary term "stage IVA anaplastic thyroid cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVA, cancer is found in the thyroid only and the tumor may be any size.
    More Information
    - Thyroid Cancer Treatment
    Stage IVA anaplastic thyroid cancer. Cancer is found in the thyroid only and the tumor may be any size.
    Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
  stage IVA hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IVA hypopharyngeal cancer"
    Stage IV hypopharyngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVA, the tumor (1) has spread to the thyroid cartilage, the bone above the thyroid cartilage, the thyroid gland, the cartilage around the trachea, the esophageal muscle, or the nearby muscles and fatty tissue in the neck. Cancer may have also spread to one lymph node on the same side of the neck as the tumor. The affected lymph node is 3 centimeters or smaller; or (2) is found in the hypopharynx and may have spread to the thyroid cartilage, the bone above the thyroid cartilage, the thyroid gland, the cartilage around the trachea, the esophagus, or the nearby muscles and fatty tissue in the neck. Cancer has spread to one of the following: (a) one lymph node on the same side of the neck as the tumor. The affected lymph node is larger than 3 centimeters but not larger than 6 centimeters; or (b) more than one lymph node anywhere in the neck. The affected lymph nodes are 6 centimeters or smaller.
    More Information
    - Hypopharyngeal Cancer Treatment
  stage IVA laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IVA laryngeal cancer"
    Stage IV laryngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVA, (1) cancer has spread through the thyroid cartilage and/or has spread to tissues beyond the larynx, such as the neck, trachea, thyroid, or esophagus. Cancer may have also spread to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller; or (2) cancer may have spread from the supraglottis, glottis, or subglottis to tissues beyond the larynx, such as the neck, trachea, thyroid, or esophagus. The vocal cords may not work normally. Cancer has spread: (a) to one lymph node on the same side of the neck as the primary tumor and the lymph node is 3 centimeters or smaller. Cancer has spread through the outside covering of the lymph node; or (b) to one lymph node on the same side of the neck as the primary tumor and the lymph node is larger than 3 centimeters but not larger than 6 centimeters. Cancer has not spread through the outside covering of the lymph node; or (c) to more than one lymph node on the same side of the neck as the primary tumor and the lymph nodes are not larger than 6 centimeters. Cancer has not spread through the outside covering of the lymph nodes; or (d) to lymph nodes on both sides of the neck or on the side of the neck opposite the primary tumor and the lymph nodes are not larger than 6 centimeters. Cancer has not spread through the outside covering of the lymph nodes.
    More Information
    - Laryngeal Cancer Treatment
  stage IVA lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage IVA lip and oral cavity cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVA, the tumor (1) is larger than 4 centimeters and the deepest point of tumor invasion is greater than 10 millimeters; or cancer has spread to the outer surface of the upper or lower jawbone, into the maxillary sinus, or to the skin of the face. The cancer may have spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor; or (2) is any size or cancer has spread to the outer surface of the upper or lower jawbone, into the maxillary sinus, or to the skin of the face. Cancer has spread (a) to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor, and cancer has spread through the outside covering of the lymph node into nearby connective tissue; or (b) to one lymph node that is larger than 3 centimeters but not larger than 6 centimeters, on the same side of the neck as the primary tumor; or (c) to multiple lymph nodes that are not larger than 6 centimeters, on the same side of the neck as the primary tumor; or (d) to multiple lymph nodes that are not larger than 6 centimeters, on the opposite side of the neck as the primary tumor or on both sides of the neck.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage IVA maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IVA maxillary sinus cancer"
    Stage IV maxillary sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVA, (1) cancer has spread to any of the following: the eye, the skin of the cheek, the part of the sphenoid bone behind the upper jaw, the area behind the upper jaw, the bone between the eyes, and/or the sphenoid or frontal sinuses. Cancer may have also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller; or (2) cancer is found in the maxillary sinus and may have spread to any of the following: the bones around the maxillary sinus (including the roof of the mouth and the nose), the bone between the eyes, the tissues under the skin, the skin of the cheek, the eye, the part of the eye socket near the nose, or the bottom of the eye socket, the area behind the cheek bone, the part of the sphenoid bone behind the upper jaw, the area behind the upper jaw, and/or the ethmoid, sphenoid, or frontal sinuses. Cancer has also spread to one of the following: one lymph node on the same side of the neck as the cancer and the lymph node is larger than 3 centimeters but not larger than 6 centimeters; or more than one lymph node on the same side of the neck as the cancer and the lymph nodes are not larger than 6 centimeters; or lymph nodes on the opposite side of the neck as the cancer or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage IVA nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IVA nasal cavity and ethmoid sinus cancer"
    Stage IV nasal cavity and ethmoid sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVA, (1) cancer has spread to any of the following: the eye, the skin of the nose or cheek, the front parts of the skull, the part of the sphenoid bone behind the upper jaw, and/or the sphenoid or frontal sinuses. Cancer may have also spread to one lymph node on the same side of the neck as the cancer, and the lymph node is 3 centimeters or smaller; or (2) cancer is found in the nasal cavity or ethmoid sinus and may have spread to any of the following: the eye, the part of the eye socket near the nose, or the bottom of the eye socket, the skin of the nose or cheek, the front parts of the skull, the part of the sphenoid bone behind the upper jaw, and/or the sphenoid or frontal sinuses. Cancer has also spread to one of the following: one lymph node on the same side of the neck as the cancer and the lymph node is larger than 3 centimeters but not larger than 6 centimeters; or more than one lymph node on the same side of the neck as the cancer and the lymph nodes are not larger than 6 centimeters; or lymph nodes on the opposite side of the neck as the cancer or on both sides of the neck, and the lymph nodes are not larger than 6 centimeters.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage IVA pancreatic cancer: (... PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "stage IVA pancreatic cancer"
    Cancer has spread to organs that are near the pancreas (such as the stomach, spleen, or colon) but has not spread to distant organs (such as the liver or lungs).
    Stage IV pancreatic cancer. Cancer may be any size and has spread to other parts of the body, such as the lung, liver, and peritoneal cavity (the space in the abdomen that contains the intestines, stomach, and liver). Cancer may also have spread to tissues and organs near the pancreas or to lymph nodes.
    Stage IV pancreatic cancer; drawing shows other parts of the body where pancreatic cancer may spread, including the lung, liver, and peritoneal cavity. An inset shows cancer cells spreading from the pancreas, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IVA salivary gland cancer: (...SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "stage IVA salivary gland cancer"
    Stage IV salivary gland cancer is divided into stages IVA, IVB, and IVC. In stage IVA, (1) cancer has spread to the skin, jawbone, ear canal, and/or facial nerve. Cancer may have spread to one lymph node on the same side of the head or neck as the tumor. The lymph node is 3 centimeters or smaller and cancer has not grown outside the lymph node; OR (2) the tumor is any size and cancer may have spread to soft tissue around the salivary gland or to the skin, jawbone, ear canal, and/or facial nerve. Cancer has spread (a) to one lymph node on the same side of the head or neck as the tumor; the lymph node is 3 centimeters or smaller and cancer has grown outside the lymph node; or (b) to one lymph node on the same side of the head or neck as the tumor; the lymph node is larger than 3 centimeters but not larger than 6 centimeters and cancer has not grown outside the lymph node; or (c)to more than one lymph node on the same side of the head or neck as the tumor; the lymph nodes are 6 centimeters or smaller and cancer has not grown outside the lymph nodes; or (d) to lymph nodes on both sides of the head or neck or on the side opposite the primary tumor; the lymph nodes are 6 centimeters or smaller and cancer has not grown outside the lymph nodes.
    More Information
    - Salivary Gland Cancer Treatment
  stage IVB anaplastic thyroid cancer: (... A-nuh-PLAS-tik THY-royd KAN-ser)
    Pronunciation of dictionary term "stage IVB anaplastic thyroid cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVB, one of the following is found: (1) cancer is found in the thyroid and the tumor may be any size; cancer has spread to nearby lymph nodes; or (2) the tumor is any size and cancer has spread from the thyroid to nearby muscles in the neck and may have spread to nearby lymph nodes; or (3) the tumor is any size and cancer has spread from the thyroid to soft tissue under the skin, the esophagus, the trachea, the larynx, the recurrent laryngeal nerve (a nerve that goes to the larynx), or tissue in front of the spine, or cancer has surrounded the carotid artery or the blood vessels in the area between the lungs; cancer may have spread to lymph nodes.
    More Information
    - Thyroid Cancer Treatment
    Stage IVB anaplastic thyroid cancer (1). Cancer is found in the thyroid and the tumor may be any size. Cancer has spread to nearby lymph nodes.
    Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
    Stage IVB anaplastic thyroid cancer (2). The tumor is any size and cancer has spread from the thyroid to nearby muscles in the neck. Cancer may have spread to nearby lymph nodes.
    Stage IVB anaplastic thyroid cancer (2); drawing shows cancer in the thyroid gland and nearby muscles in the neck. The lymph nodes are also shown.
    Stage IVB anaplastic thyroid cancer (3). The tumor is any size and cancer has spread from the thyroid to soft tissue under the skin, the esophagus, the trachea, the larynx, the recurrent laryngeal nerve (a nerve that goes to the larynx), or tissue in front of the spine; or cancer has surrounded the carotid artery or the blood vessels in the area between the lungs. Cancer may have spread to lymph nodes.
    Stage IVB anaplastic thyroid cancer (3); drawing shows cancer in the thyroid gland and in the esophagus, the trachea, the larynx, the left recurrent laryngeal nerve, and the tissue in front of the spine (inset). Cancer has also surrounded the common carotid artery and the blood vessels in the area between the lungs. Also shown is the right recurrent laryngeal nerve.
  stage IVB hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IVB hypopharyngeal cancer"
    Stage IV hypopharyngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVB, the tumor (1) may be any size and cancer may have spread to the thyroid cartilage, the bone above the thyroid cartilage, the thyroid gland, the cartilage around the trachea, the esophagus, or the nearby muscles and fatty tissue in the neck. Cancer has spread to a lymph node that is larger than 6 centimeters or has spread through the outside covering of a lymph node into nearby connective tissue; or (2) has spread to the connective tissue covering the muscles that support the spinal column, the area around the carotid artery, or the area between the lungs. Cancer may have also spread to lymph nodes in the neck.
    More Information
    - Hypopharyngeal Cancer Treatment
  stage IVB laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IVB laryngeal cancer"
    Stage IV laryngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVB, (1) cancer may have spread from the supraglottis, glottis, or subglottis to the space in front of the spine, the area around the carotid artery, or the area between the lungs. The vocal cords may not work normally. Cancer has spread: (a) to one lymph node that is larger than 6 centimeters. Cancer has not spread through the outside covering of the lymph node; or (b) to one lymph node on the same side of the neck as the primary tumor and the lymph node is larger than 3 centimeters. Cancer has spread through the outside covering of the lymph node; or (c) to more than one lymph node anywhere in the neck. Cancer has spread through the outside covering of the lymph nodes; or (d) to one lymph node of any size on the side of the neck opposite the primary tumor. Cancer has spread through the outside covering of the lymph node; OR (2) cancer has spread from the supraglottis, glottis, or subglottis to the space in front of the spine, the area around the carotid artery, or the area between the lungs. Cancer may have also spread to one or more lymph nodes anywhere in the neck and the lymph nodes may be any size.
    More Information
    - Laryngeal Cancer Treatment
  stage IVB lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage IVB lip and oral cavity cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVB, the tumor (1) has spread to one lymph node that is larger than 6 centimeters; or (2) has spread to one lymph node that is larger than 3 centimeters, on the same side of the neck as the primary tumor, and cancer has spread through the outside covering of the lymph node into nearby connective tissue; or (3) has spread to one lymph node of any size on the opposite side of the neck as the primary tumor, and cancer has spread through the outside covering of the lymph node into nearby connective tissue; or (4) has spread to multiple lymph nodes anywhere in the neck, and cancer has spread through the outside covering of any lymph node into nearby connective tissue; or (5) has spread further into the muscles or bones needed for chewing, or to the part of the sphenoid bone behind the upper jaw, and/or to the carotid artery near the base of the skull. Cancer may have also spread to one or more lymph nodes of any size, anywhere in the neck.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage IVB maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IVB maxillary sinus cancer"
    Stage IV maxillary sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVB, (1) cancer has spread to any of the following: the area behind the eye, the brain, the middle parts of the skull, the nerves that begin in the brain and go to the face, neck, and other parts of the brain (cranial nerves), the upper part of the throat behind the nose, and/or the base of the skull near the spinal cord. Cancer may have also spread to one or more lymph nodes of any size, anywhere in the neck; or (2) cancer may be found anywhere in or near the maxillary sinus. Cancer has spread to a lymph node that is larger than 6 centimeters or has spread through the outside covering of a lymph node into nearby connective tissue.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage IVB nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IVB nasal cavity and ethmoid sinus cancer"
    Stage IV nasal cavity and ethmoid sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVB, (1) cancer has spread to any of the following: the area behind the eye, the brain, the middle parts of the skull, the nerves that begin in the brain and go to the face, neck, and other parts of the brain (cranial nerves), the upper part of the throat behind the nose, and/or the base of the skull near the spinal cord. Cancer may have also spread to one or more lymph nodes of any size, anywhere in the neck; or (2) cancer may be found anywhere in or near the nasal cavity or ethmoid sinus. Cancer has spread to a lymph node that is larger than 6 centimeters or has spread through the outside covering of a lymph node into nearby connective tissue.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage IVB pancreatic cancer: (... PAN-kree-A-tik KAN-ser)
    Pronunciation of dictionary term "stage IVB pancreatic cancer"
    Cancer of the pancreas in which the cancer has spread to distant organs (such as the liver or lungs).
    Stage IV pancreatic cancer. Cancer may be any size and has spread to other parts of the body, such as the lung, liver, and peritoneal cavity (the space in the abdomen that contains the intestines, stomach, and liver). Cancer may also have spread to tissues and organs near the pancreas or to lymph nodes.
    Stage IV pancreatic cancer; drawing shows other parts of the body where pancreatic cancer may spread, including the lung, liver, and peritoneal cavity. An inset shows cancer cells spreading from the pancreas, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IVB salivary gland cancer: (... SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "stage IVB salivary gland cancer"
    Stage IV salivary gland cancer is divided into stages IVA, IVB, and IVC. In stage IVB, (1) the tumor is any size and cancer may have spread to soft tissue around the salivary gland or to the skin, jawbone, ear canal, and/or facial nerve. Cancer has spread (a) to one lymph node larger than 6 centimeters and cancer has not grown outside the lymph node; or (b) to one lymph node on the same side of the head or neck as the tumor; the lymph node is larger than 3 centimeters and cancer has grown outside the lymph node; or (c) to more than one lymph node on the same side of the head or neck as the tumor, on the side opposite the primary tumor, or on both sides of the head or neck; cancer has grown outside any of the lymph nodes; or (d) to one lymph node of any size on the side of the head or neck opposite the primary tumor; cancer has grown outside the lymph node; OR (2) cancer has spread to the bottom of the skull and/or surrounds the carotid artery. Cancer may have spread to one or more lymph nodes of any size on either or both sides of the head or neck and may have grown outside the lymph nodes.
    More Information
    - Salivary Gland Cancer Treatment
  stage IVC anaplastic thyroid cancer: (... A-nuh-PLAS-tik THY-royd KAN-ser)
    Pronunciation of dictionary term "stage IVC anaplastic thyroid cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVC, the tumor is any size and cancer has spread to other parts of the body, such as the lungs or bones. Cancer may have spread to lymph nodes.
    More Information
    - Thyroid Cancer Treatment
    Stage IVC anaplastic thyroid cancer. The tumor is any size and cancer has spread to other parts of the body, such as the lungs or bones. Cancer may have spread to lymph nodes.
    Stage IVC anaplastic thyroid cancer; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
  stage IVC hypopharyngeal cancer: (... HY-poh-fuh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IVC hypopharyngeal cancer"
    Stage IV hypopharyngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVC, cancer has spread to other parts of the body, such as the lung, liver, or bone.
    More Information
    - Hypopharyngeal Cancer Treatment
  stage IVC laryngeal cancer: (... luh-RIN-jee-ul KAN-ser)
    Pronunciation of dictionary term "stage IVC laryngeal cancer"
    Stage IV laryngeal cancer is divided into stages IVA, IVB, and IVC. In stage IVC, cancer has spread to other parts of the body, such as the lungs, liver, or bone.
    More Information
    - Laryngeal Cancer Treatment
  stage IVC lip and oral cavity cancer: (... OR-ul KA-vih-tee KAN-ser)
    Pronunciation of dictionary term "stage IVC lip and oral cavity cancer"
    Stage IV is divided into stages IVA, IVB, and IVC. In stage IVC, the tumor has spread beyond the lip or oral cavity to other parts of the body, such as the lung, liver, or bone.
    More Information
    - Lip and Oral Cavity Cancer Treatment
  stage IVC maxillary sinus cancer: (...MAK-sih-LAYR-ee SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IVC maxillary sinus cancer"
    Stage IV maxillary sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVC, cancer may be found anywhere in or near the maxillary sinus, may have spread to lymph nodes, and has spread to organs far away from the maxillary sinus, such as the lungs.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage IVC nasal cavity and ethmoid sinus cancer: (...NAY-zul KA-vih-tee…ETH-moyd SY-nus KAN-ser)
    Pronunciation of dictionary term "stage IVC nasal cavity and ethmoid sinus cancer"
    Stage IV nasal cavity and ethmoid sinus cancer is divided into stages IVA, IVB, and IVC. In stage IVC, cancer may be found anywhere in or near the nasal cavity or ethmoid sinus, may have spread to lymph nodes, and has spread to organs far away from the nasal cavity and ethmoid sinus, such as the lungs.
    More Information
    - Paranasal Sinus and Nasal Cavity Cancer Treatment
  stage IVC salivary gland cancer: (... SA-lih-VAYR-ee gland KAN-ser)
    Pronunciation of dictionary term "stage IVC salivary gland cancer"
    Stage IV salivary gland cancer is divided into stages IVA, IVB, and IVC. In stage IVC, cancer has spread to other parts of the body, such as the lungs.
    More Information
    - Salivary Gland Cancer Treatment
  stage V Wilms tumor: (… wilmz TOO-mer)
    Pronunciation of dictionary term "stage V Wilms tumor"
    Cancer cells are found in both kidneys when the cancer is first diagnosed. The cancer in each kidney is staged separately as stage I, II, III, or IV.
    More Information
    - Wilms Tumor and Other Childhood Kidney Tumors Treatment
  staging: (STAY-jing)
    Pronunciation of dictionary term "staging"
    Performing exams and tests to learn the extent of the cancer within the body, especially whether the disease has spread from where it first formed to other parts of the body. It is important to know the stage of the disease in order to plan the best treatment.
    More Information
    - Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
  staging system: (STAY-jing SIS-tem)
    Pronunciation of dictionary term "staging system"
    A system that is used to describe the extent of cancer in the body. Staging is usually based on the size of the tumor and whether the cancer has spread from where it started to nearby areas, lymph nodes, or other parts of the body.
  stamina: (STA-mih-nuh)
    Pronunciation of dictionary term "stamina"
    The energy and strength to endure physical activity, stress, or illness over time.
  standard medical care: (STAN-durd MEH-dih-kul kayr)
    Pronunciation of dictionary term "standard medical care"
    Treatment that is accepted by medical experts as a proper treatment for a certain type of disease and that is widely used by health care professionals. Also called best practice, standard of care, and standard therapy.
  standard of care: (STAN-durd ... kayr)
    Pronunciation of dictionary term "standard of care"
    Treatment that is accepted by medical experts as a proper treatment for a certain type of disease and that is widely used by health care professionals. Also called best practice, standard medical care, and standard therapy.
  Standard Operating Procedure: (STAN-durd AH-puh-RAY-ting proh-SEE-jer)
    Pronunciation of dictionary term "Standard Operating Procedure"
    Written instructions for doing a specific task in a certain way. In clinical trials, Standard Operating Procedures are set up to store records, collect data, screen and enroll subjects, and submit Institutional Review Board (IRB) applications and renewals. Also called SOP.
  standard therapy: (STAN-durd THAYR-uh-pee)
    Pronunciation of dictionary term "standard therapy"
    Treatment that is accepted by medical experts as a proper treatment for a certain type of disease and that is widely used by health care professionals. Also called best practice, standard medical care, and standard of care.
  Stanford V: (STAN-furd …)
    Pronunciation of dictionary term "Stanford V"
    An abbreviation for a chemotherapy combination that is used to treat Hodgkin lymphoma and is being studied in the treatment of other types of cancer. It includes the drugs mechlorethamine, doxorubicin hydrochloride, vinblastine sulfate, vincristine sulfate, bleomycin sulfate, etoposide phosphate, and prednisone and was developed at Stanford University. Also called Stanford V regimen.
    More Information
    - STANFORD V (https://www.cancer.gov/about-cancer/treatment/drugs/STANFORDV)
  Stanford V regimen: (STAN-furd … REH-jih-men)
    Pronunciation of dictionary term "Stanford V regimen"
    An abbreviation for a chemotherapy combination that is used to treat Hodgkin lymphoma and is being studied in the treatment of other types of cancer. It includes the drugs mechlorethamine, doxorubicin hydrochloride, vinblastine sulfate, vincristine sulfate, bleomycin sulfate, etoposide phosphate, and prednisone and was developed at Stanford University. Also called Stanford V.
    More Information
    - STANFORD V (https://www.cancer.gov/about-cancer/treatment/drugs/STANFORDV)
  starch: (starch)
    Pronunciation of dictionary term "starch"
    A substance found in plants. It contains sugar molecules joined chemically. It is found in high levels in foods such as potatoes, rice, corn, and wheat. It may be used as a dusting powder, a skin softener, a filler in medicine tablets, and a clothes stiffener.
  statin: (STA-tin)
    Pronunciation of dictionary term "statin"
    Any of a group of drugs that lower the amount of cholesterol and certain fats in the blood. Statins inhibit a key enzyme that helps make cholesterol. Statin drugs are being studied in the prevention and treatment of cancer.
  statistical power: (stuh-TIS-tih-kul POW-er)
    Pronunciation of dictionary term "statistical power"
    The anticipated probability of finding a difference among treatment groups in the research study given the sample size to be used, the endpoint chosen, and the statistical test used.
  statistically significant: (stuh-TIS-tih-kuh-lee sig-NIH-fih-kunt)
    Pronunciation of dictionary term "statistically significant"
    Describes a mathematical measure of difference between groups. The difference is said to be statistically significant if it is greater than what might be expected to happen by chance alone. Also called significant.
  stature: (STA-cher)
    Pronunciation of dictionary term "stature"
    The height of a person while standing.
  staurosporine: (STAW-roh-SPOR-een)
    Pronunciation of dictionary term "staurosporine"
    A drug that belongs to the family of drugs called alkaloids. It is being studied in the treatment of cancer.
  stavudine: (STA-vyoo-deen)
    Pronunciation of dictionary term "stavudine"
    A drug that belongs to the family of drugs called nucleoside analogs. It is used to treat infection caused by viruses.
  Stavzor: (STAV-zore)
    Pronunciation of dictionary term "Stavzor"
    A drug used to treat epileptic seizures and bipolar disorder and to prevent migraine headaches. It is also being studied in the treatment of several types of cancer. It blocks an enzyme that cells need to grow and may cause cancer cells to die. It also blocks the growth of new blood vessels that tumors need to grow. It is a type of anticonvulsant, histone deacetylase (HDAC) inhibitor, antimaniacal, migraine headache prophylactic, and antiangiogenesis agent. Also called Depakene and valproic acid.
  STD: A disease caused by infection with certain bacteria, viruses, or other microorganisms that can be passed from one person to another through blood, semen, vaginal fluids, or other body fluids, during oral, anal, or genital sex with an infected partner. These diseases can also be spread through sharing needles, blood transfusions, breastfeeding, or from an infected mother to an infant during pregnancy and childbirth. Symptoms of STDs may include sores, blisters, or bumps on the genitals or in the mouth or rectal area, pain or burning during urination or sex, unusual drainage or bleeding from the penis or vagina, itching and redness in the genital or anal area, pain in the lower abdomen, fever, and sore, swollen lymph nodes, especially in the groin. There are many types of STDs, including human papillomavirus (HPV), HIV, genital herpes, chlamydia, gonorrhea, and syphilis. If not treated, some STDs can lead to long-term health problems. Also called sexually transmitted disease, sexually transmitted infection, and STI.
  stellate: (STEH-layt)
    Pronunciation of dictionary term "stellate"
    Star shaped.
  stem cell: (stem sel)
    Pronunciation of dictionary term "stem cell"
    A cell from which other types of cells develop. For example, blood cells develop from blood-forming stem cells.
  stem cell engraftment: (stem sel en-GRAFT-ment)
    Pronunciation of dictionary term "stem cell engraftment"
    A process in which transplanted stem cells travel through the blood to the bone marrow, where they begin to make new white blood cells, red blood cells, and platelets. It usually happens within 2 to 4 weeks after a stem cell transplant. The transplanted stem cells may come from a donor or from the patient.
  stem cell factor: (stem sel FAK-ter)
    Pronunciation of dictionary term "stem cell factor"
    A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. Stem cell factor is a type of cytokine and a type of growth factor. Also called kit ligand and SCF.
  stem cell factor receptor: (… sel FAK-ter reh-SEP-ter)
    Pronunciation of dictionary term "stem cell factor receptor"
    A protein found on the surface of many different types of cells. It binds to a substance called stem cell factor (SCF), which causes certain types of blood cells to grow. Stem cell factor receptor may also be found in higher than normal amounts, or in a changed form, on some types of cancer cells, including gastrointestinal stromal tumors and melanoma. Measuring the amount of stem cell factor receptor in tumor tissue may help diagnose cancer and plan treatment. Stem cell factor receptor is a type of receptor tyrosine kinase and a type of tumor marker. Also called c-kit and CD117.
  stem cell mobilization: (stem sel MOH-bih-lih-ZAY-shun)
    Pronunciation of dictionary term "stem cell mobilization"
    A process in which certain drugs are used to cause the movement of stem cells from the bone marrow into the blood. The stem cells can be collected and stored. They may be used later to replace the bone marrow during a stem cell transplant.
  stem cell rescue: (stem sel REH-skyoo)
    Pronunciation of dictionary term "stem cell rescue"
    A method of replacing blood-forming stem cells that were destroyed by treatment with high doses of anticancer drugs or radiation therapy. The stem cells help the bone marrow recover and make healthy blood cells. A stem cell rescue may allow more chemotherapy or radiation therapy to be given so that more cancer cells are killed. It is usually done using the patient’s own stem cells that were saved before treatment. Also called rescue transplant.
  stem cell transplant: (stem sel TRANZ-plant)
    Pronunciation of dictionary term "stem cell transplant"
    A procedure in which a patient receives healthy stem cells (blood-forming cells) to replace their own stem cells that have been destroyed by treatment with radiation or high doses of chemotherapy. The healthy stem cells may come from the blood or bone marrow of the patient or from a related or unrelated donor. A stem cell transplant may be autologous (using a patient’s own stem cells that were collected and saved before treatment), allogeneic (using stem cells from a related or unrelated donor), syngeneic (using stem cells donated by an identical twin), or cord blood (using umbilical cord blood donated after a baby is born).
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
    Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.
    Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.
  Stemgen: (STEM-jen)
    Pronunciation of dictionary term "Stemgen"
    A substance that causes blood stem cells (cells from which other types of cells develop) to change into different types of blood cells and increases the number and actions of these cells in the blood. It is being studied in the treatment of myelodysplasia. Stemgen is a type of recombinant stem cell growth factor. Also called ancestim, r-metHuSCF, and recombinant human methionyl stem cell factor.
  stent: (stent)
    Pronunciation of dictionary term "stent"
    A device placed in a body structure (such as a blood vessel or the gastrointestinal tract) to keep the structure open.
  stereotactic ablative body radiation therapy: (STAYR-ee-oh-TAK-tik a-BLAY-tiv BAH-dee RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "stereotactic ablative body radiation therapy"
    A type of external radiation therapy that uses special equipment to position a patient and precisely deliver radiation to tumors in the body (except the brain). The total dose of radiation is divided into smaller doses given over several days. This type of radiation therapy helps spare normal tissue. Also called SABR, SBRT, and stereotactic body radiation therapy.
  stereotactic biopsy: (STAYR-ee-oh-TAK-tik BY-op-see)
    Pronunciation of dictionary term "stereotactic biopsy"
    A biopsy procedure that uses a computer and a 3-dimensional scanning device to find a tumor site and guide the removal of tissue for examination under a microscope.
  stereotactic body radiation therapy: (STAYR-ee-oh-TAK-tik BAH-dee RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "stereotactic body radiation therapy"
    A type of external radiation therapy that uses special equipment to position a patient and precisely deliver radiation to tumors in the body (except the brain). The total dose of radiation is divided into smaller doses given over several days. This type of radiation therapy helps spare normal tissue. Also called SABR, SBRT, and stereotactic ablative body radiation therapy.
  stereotactic core needle biopsy: (STAYR-ee-oh-TAK-tik ... NEE-dul BY-op-see)
    Pronunciation of dictionary term "stereotactic core needle biopsy"
    A procedure that uses x-ray images taken at different angles to find an abnormal area in the body. The images help guide the removal of a tissue sample from that area with a wide, hollow needle. The tissue sample is then checked under a microscope for signs of disease, such as cancer. A stereotactic core needle biopsy may be done when a lump or mass cannot be felt or when the abnormal area cannot be seen clearly on other imaging tests. It may be used to check for certain types of cancer, including cancers of the breast, lung, liver, and brain.
  stereotactic external-beam radiation therapy: (STAYR-ee-oh-TAK-tik ... RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "stereotactic external-beam radiation therapy"
    A type of external radiation therapy that uses special equipment to position the patient and precisely deliver radiation to a tumor. The total dose of radiation is divided into several smaller doses given over several days. Stereotactic external-beam radiation therapy is used to treat brain tumors and other brain disorders. It is also being studied in the treatment of other types of cancer, such as lung cancer. Also called stereotactic radiation therapy and stereotaxic radiation therapy.
  stereotactic injection: (STAYR-ee-oh-TAK-tik in-JEK-shun)
    Pronunciation of dictionary term "stereotactic injection"
    A procedure in which a computer and a 3-dimensional scanning device are used to inject anticancer drugs directly into a tumor.
  stereotactic procedure: (STAYR-ee-oh-TAK-tik proh-SEE-jer)
    Pronunciation of dictionary term "stereotactic procedure"
    A procedure that uses special equipment and imaging techniques to find an abnormal area in the brain, breast, lung, or liver and help guide the removal of a tissue sample from that area. Stereotactic procedures are also used to treat some cancers, including cancers of the brain, breast, lung, and liver, by precisely delivering radiation directly to a tumor. Also called stereotaxic procedure.
  stereotactic radiation therapy: (STAYR-ee-oh-TAK-tik RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "stereotactic radiation therapy"
    A type of external radiation therapy that uses special equipment to position the patient and precisely deliver radiation to a tumor. The total dose of radiation is divided into several smaller doses given over several days. Stereotactic radiation therapy is used to treat brain tumors and other brain disorders. It is also being studied in the treatment of other types of cancer, such as lung cancer. Also called stereotactic external-beam radiation therapy and stereotaxic radiation therapy.
  stereotactic radiosurgery: (STAYR-ee-oh-TAK-tik RAY-dee-oh-SER-juh-ree)
    Pronunciation of dictionary term "stereotactic radiosurgery"
    A type of external radiation therapy that uses special equipment to position the patient and precisely give a single large dose of radiation to a tumor. It is used to treat brain tumors and other brain disorders that cannot be treated by regular surgery. It is also being studied in the treatment of other types of cancer. Also called radiation surgery, radiosurgery, and stereotaxic radiosurgery.
  stereotaxic procedure: (STAYR-ee-oh-TAK-sik proh-SEE-jer)
    Pronunciation of dictionary term "stereotaxic procedure"
    A procedure that uses special equipment and imaging techniques to find an abnormal area in the brain, breast, lung, or liver and help guide the removal of a tissue sample from that area. Stereotaxic procedures are also used to treat some cancers, including cancers of the brain, breast, lung, and liver, by precisely delivering radiation directly to a tumor. Also called stereotactic procedure.
  stereotaxic radiation therapy: (STAYR-ee-oh-TAK-sik RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "stereotaxic radiation therapy"
    A type of external radiation therapy that uses special equipment to position the patient and precisely deliver radiation to a tumor. The total dose of radiation is divided into several smaller doses given over several days. Stereotaxic radiation therapy is used to treat brain tumors and other brain disorders. It is also being studied in the treatment of other types of cancer, such as lung cancer. Also called stereotactic external-beam radiation therapy and stereotactic radiation therapy.
  stereotaxic radiosurgery: (STAYR-ee-oh-TAK-sik RAY-dee-oh-SER-juh-ree)
    Pronunciation of dictionary term "stereotaxic radiosurgery"
    A type of external radiation therapy that uses special equipment to position the patient and precisely give a single large dose of radiation to a tumor. It is used to treat brain tumors and other brain disorders that cannot be treated by regular surgery. It is also being studied in the treatment of other types of cancer. Also called radiation surgery, radiosurgery, and stereotactic radiosurgery.
  sterile: (STAYR-il)
    Pronunciation of dictionary term "sterile"
    Unable to produce children. Also means free from germs.
  Sterile Talc Powder: (STAYR-il ... POW-der)
    Pronunciation of dictionary term "Sterile Talc Powder"
    A mist or powdered form of the mineral magnesium silicate that is used to prevent malignant pleural effusions from coming back. Malignant pleural effusion is a condition in which cancer causes an abnormal collection of fluid in the space between the lung and chest wall. When Sterile Talc Powder is given through a tube inserted into the pleural space, it causes the space to close up so fluid cannot collect there. Sterile Talc Powder is a type of sclerosing agent. Also called Sclerosol Intrapleural Aerosol, Steritalc, and talc.
    More Information
    - Talc (https://www.cancer.gov/about-cancer/treatment/drugs/talc)
  Steritalc: (STAYR-ih-talc)
    Pronunciation of dictionary term "Steritalc"
    A mist or powdered form of the mineral magnesium silicate that is used to prevent malignant pleural effusions from coming back. Malignant pleural effusion is a condition in which cancer causes an abnormal collection of fluid in the space between the lung and chest wall. When Steritalc is given through a tube inserted into the pleural space, it causes the space to close up so fluid cannot collect there. Steritalc is a type of sclerosing agent. Also called Sclerosol Intrapleural Aerosol, Sterile Talc Powder, and talc.
    More Information
    - Talc (https://www.cancer.gov/about-cancer/treatment/drugs/talc)
  sternum: (STER-num)
    Pronunciation of dictionary term "sternum"
    The long flat bone that forms the center front of the chest wall. The sternum is attached to the collarbone and the first seven ribs. Also called breastbone.
  steroid: (STAYR-oyd)
    Pronunciation of dictionary term "steroid"
    Any of a group of lipids (fats) that have a certain chemical structure. Steroids occur naturally in plants and animals or they may be made in the laboratory. Examples of steroids include sex hormones, cholesterol, bile acids, and some drugs.
  steroid cream: (STAYR-oyd...)
    Pronunciation of dictionary term "steroid cream"
    A skin cream containing a type of drug that relieves swelling, itching, and inflammation.
  steroid drug: (STAYR-oyd ...)
    Pronunciation of dictionary term "steroid drug"
    A type of drug used to relieve swelling and inflammation. Some steroid drugs may also have antitumor effects.
  steroid metabolism gene: (STAYR-oyd meh-TA-buh-lih-zum jeen)
    Pronunciation of dictionary term "steroid metabolism gene"
    A type of gene that helps the body build up or break down steroids. Steroids may be made by the body (such as hormones and cholesterol) or made in a laboratory (such as drugs). A steroid metabolism gene called CYP17 is being studied in breast, ovarian, and uterine cancers.
  steroid therapy: (STAYR-oyd THAYR-uh-pee)
    Pronunciation of dictionary term "steroid therapy"
    Treatment with corticosteroid drugs to reduce swelling, pain, and other symptoms of inflammation.
  Stewart-Treves syndrome: (STOO-wert-treevz SIN-drome)
    Pronunciation of dictionary term "Stewart-Treves syndrome"
    A rare disorder marked by the presence of an angiosarcoma (a malignant tumor of blood or lymph vessels) in a person with chronic (long-term) lymphedema. Lymphedema is a condition in which extra lymph fluid builds up in tissues and causes swelling, usually in the arm or leg. Stewart-Treves syndrome usually occurs in patients with breast cancer who develop chronic lymphedema after surgery to remove the breast and lymph nodes under the arm.
    More Information
    - Stewart Treves syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8706/stewart-treves-syndrome)
  STI: A disease caused by infection with certain bacteria, viruses, or other microorganisms that can be passed from one person to another through blood, semen, vaginal fluids, or other body fluids, during oral, anal, or genital sex with an infected partner. These diseases can also be spread through sharing needles, blood transfusions, breastfeeding, or from an infected mother to an infant during pregnancy and childbirth. Symptoms of STIs may include sores, blisters, or bumps on the genitals or in the mouth or rectal area, pain or burning during urination or sex, unusual drainage or bleeding from the penis or vagina, itching and redness in the genital or anal area, pain in the lower abdomen, fever, and sore, swollen lymph nodes, especially in the groin. There are many types of STIs, including human papillomavirus (HPV), HIV, genital herpes, chlamydia, gonorrhea, and syphilis. If not treated, some STIs can lead to long-term health problems. Also called sexually transmitted disease, sexually transmitted infection, and STD.
  STI571: A drug used to treat certain types of leukemia and other blood cancers, gastrointestinal stromal tumors, skin tumors called dermatofibrosarcoma protuberans, and a certain type of a rare condition called systemic mastocytosis. It is also being studied in the treatment of other conditions and types of cancer. STI571 blocks certain proteins made by the BCR::ABL1, PDGFR, or c-KIT oncogene, which may help keep cancer cells from growing and may kill them. STI571 is a type of tyrosine kinase inhibitor. Also called Gleevec, imatinib mesylate, and Imkeldi.
    More Information
    - Imatinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/imatinibmesylate)
  Stivarga: (stih-VAR-guh)
    Pronunciation of dictionary term "Stivarga"
    A drug used to treat certain types of colorectal cancer, gastrointestinal stromal tumors, and hepatocellular carcinoma (a type of liver cancer). It is also being studied in the treatment of other types of cancer. Stivarga blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Stivarga is a type of kinase inhibitor and a type of antiangiogenesis agent. Also called regorafenib.
    More Information
    - Regorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/regorafenib)
  stoma: (STOH-muh)
    Pronunciation of dictionary term "stoma"
    A surgically created opening from an area inside the body to the outside.
  stomach: (STUH-muk)
    Pronunciation of dictionary term "stomach"
    An organ that is part of the digestive system. The stomach helps digest food by mixing it with digestive juices and churning it into a thin liquid.
    More Information
    - What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)
    The stomach is an organ in the upper abdomen. It can be divided into the cardia and the non-cardia, which includes the fundus, the body, the antrum, and the pylorus. The stomach is part of the digestive system.
    Drawing of the stomach showing the cardia, the fundus, the body, the antrum, and the pylorus.
  stomach acid stimulation test: (STUH-muk A-sid STIM-yoo-LAY-shun …)
    Pronunciation of dictionary term "stomach acid stimulation test"
    A test used to measure the amount of gastric acid made by the stomach. The patient receives an injection of the hormone gastrin or insulin. A tube is put through the nose or throat into the stomach and samples are taken from the stomach and sent to a laboratory for testing. Also called gastric acid secretion test and stomach acid test.
  stomach acid test: (STUH-muk A-sid …)
    Pronunciation of dictionary term "stomach acid test"
    A test used to measure the amount of gastric acid made by the stomach. The patient receives an injection of the hormone gastrin or insulin. A tube is put through the nose or throat into the stomach and samples are taken from the stomach and sent to a laboratory for testing. Also called gastric acid secretion test and stomach acid stimulation test.
  stomach cancer: (STUH-muk KAN-ser)
    Pronunciation of dictionary term "stomach cancer"
    Cancer that forms in tissues lining the stomach. Also called gastric cancer.
    More Information
    - What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)
    The esophagus and stomach are part of the upper gastrointestinal (digestive) system.
    Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.
  stomatitis: (STOH-muh-TY-tis)
    Pronunciation of dictionary term "stomatitis"
    Inflammation or irritation of the mucous membranes in the mouth.
  stool: (stool)
    Pronunciation of dictionary term "stool"
    The material in a bowel movement. Stool is made up of undigested food, bacteria, mucus, and cells from the lining of the intestines. Also called feces.
  stool guaiac test: (stool GWY-ak …)
    Pronunciation of dictionary term "stool guaiac test"
    A test that checks for occult (hidden) blood in the stool. Small samples of stool are placed on special cards coated with a chemical substance called guaiac and sent to a doctor or laboratory for testing. A testing solution is put on the cards and the guaiac causes the stool sample to change color. If there is blood in the stool, the color changes very quickly. Blood in the stool may be a sign of colorectal cancer or other problems, such as polyps, ulcers, or hemorrhoids. Also called gFOBT, guaiac fecal occult blood test, and guaiac smear test.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
    A guaiac fecal occult blood test (FOBT) checks for occult (hidden) blood in the stool. Small samples of stool are placed on a special card and returned to a doctor or laboratory for testing.
    Guaiac fecal occult blood test (FOBT) kit; shows card, applicator, and return envelope.
  stool test: (stool test)
    Pronunciation of dictionary term "stool test"
    A test to check for hidden blood in the bowel movement.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  strabismus: (struh-BIZ-mus)
    Pronunciation of dictionary term "strabismus"
    A condition in which both eyes do not line up with one another in the same direction when looking at an object. For example, one eye may look straight ahead while the other eye turns inward toward the nose. When this occurs, two different images are sent to the brain, one from each eye. In children with strabismus, the brain may learn to ignore the image from one eye. If not treated, this can lead to permanent vision loss in that eye. Strabismus is usually caused by problems with how the muscles involved in eye movement are controlled by the brain. It can occur at any age but is more common in children. There are different forms of strabismus. The most common form is called crossed eyes.
  straight colorectal anastomosis: (strayt KOH-loh-REK-tul uh-NAS-toh-MOH-sis)
    Pronunciation of dictionary term "straight colorectal anastomosis"
    A surgical procedure in which the colon is attached directly to the remainder of the rectum after most of it has been removed during surgery for rectal cancer. This procedure is different from the J-pouch colorectal anastomosis because a pouch to store stool is not made from the colon before it is attached to the rectum.
  streptavidin: (strep-TA-vih-din)
    Pronunciation of dictionary term "streptavidin"
    A small bacterial protein that binds with high affinity to the vitamin biotin. This streptavidin-biotin combination can be used to link molecules such as radioisotopes and monoclonal antibodies together. These bound products have the property of being attracted to, and attaching to, cancer cells, rather than normal cells. The radiolabeled products are more easily removed from the body, thus decreasing their toxicity.
  streptozocin: (STREP-toh-ZOH-sin)
    Pronunciation of dictionary term "streptozocin"
    An anticancer drug that belongs to the family of drugs called alkylating agents.
  stress: (stres)
    Pronunciation of dictionary term "stress"
    In medicine, the body’s response to physical, mental, or emotional pressure. Stress causes chemical changes in the body that can raise blood pressure, heart rate, and blood sugar levels. It may also lead to feelings of frustration, anxiety, anger, or depression. Stress can be caused by normal life activities or by an event, such as trauma or illness. Long-term stress or high levels of stress may lead to mental and physical health problems.
    More Information
    - Stress and Cancer (https://www.cancer.gov/about-cancer/coping/feelings/stress-fact-sheet)
  stress protein: (... PROH-teen)
    Pronunciation of dictionary term "stress protein"
    One of a group of proteins that help protect cells from stresses such as heat, cold, and low amounts of oxygen or glucose (sugar). Stress proteins help other proteins function in normal cells and may be present at high levels in cancer cells. Blocking the activity of a stress protein called HSP90 is being studied in the treatment of cancer. Other stress proteins including HSP70 and gp96 are being studied in vaccines to treat cancer. Also called heat-shock protein and HSP.
  stroke: (stroke)
    Pronunciation of dictionary term "stroke"
    In medicine, a loss of blood flow to part of the brain, which damages brain tissue. Strokes are caused by blood clots and broken blood vessels in the brain. Symptoms include dizziness, numbness, weakness on one side of the body, and problems with talking, writing, or understanding language. The risk of stroke is increased by high blood pressure, older age, smoking, diabetes, high cholesterol, heart disease, atherosclerosis (a buildup of fatty material and plaque inside the coronary arteries), and a family history of stroke. Also called cerebrovascular accident and CVA.
  stroma: (STROH-muh)
    Pronunciation of dictionary term "stroma"
    The cells and tissues that support and give structure to organs, glands, or other tissues in the body. The stroma is mostly made up of connective tissue, blood vessels, lymphatic vessels, and nerves. It provides nutrients to the tissue or organ and removes waste and extra fluid. The stroma may also be involved in the body’s immune response and in the growth and spread of cancer cells.
  Stromagen: (stroh-MUH-jen)
    Pronunciation of dictionary term "Stromagen"
    A product that is made of special stem cells taken from a patient’s bone marrow and grown in the laboratory. After a patient’s bone marrow is destroyed by treatment with whole body irradiation or chemotherapy, these cells are injected back into the patient to help rebuild bone marrow. Stromagen has been studied in the prevention of graft-versus-host disease during stem cell transplant in patients receiving treatment for cancer. Stromagen is used in cellular therapy. Also called autologous expanded mesenchymal stem cells OTI-010.
  stromal cell: (STROH-mul sel)
    Pronunciation of dictionary term "stromal cell"
    A type of cell that makes up certain types of connective tissue (supporting tissue that surrounds other tissues and organs).
  stromal tissue: (STROH-mul TIH-shoo)
    Pronunciation of dictionary term "stromal tissue"
    A type of tissue that is part of the stroma and that supports and gives structure to organs, glands, and other tissues in the body. The stroma provides nutrients to other tissues and organs, removes waste and extra fluid, and may be involved in the body’s immune response.
  stromal tumor: (STROH-mal TOO-mer)
    Pronunciation of dictionary term "stromal tumor"
    A tumor that arises in the supporting connective tissue of an organ.
  strontium: (STRON-shee-um)
    Pronunciation of dictionary term "strontium"
    A metal often used in a radioactive form for imaging tests and in the treatment of cancer.
  strontium chloride Sr 89: (STRON-shee-um KLOR-ide …)
    Pronunciation of dictionary term "strontium chloride Sr 89"
    A salt form of the radioactive metal strontium-89 that is absorbed by a part of growing bone. It is being studied in the treatment of bone pain caused by cancer that has spread to the bone. Strontium Sr 89 is the active ingredient of strontium chloride Sr 89.
  strontium ranelate: (STRON-shee-um RAN-eh-layt)
    Pronunciation of dictionary term "strontium ranelate"
    A substance that is being studied in the treatment of osteoporosis in postmenopausal women. Strontium ranelate helps new bone tissue to grow and decreases bone loss. This lowers the risk of bone fractures.
  strontium Sr 89: (STRON-shee-um …)
    Pronunciation of dictionary term "strontium Sr 89"
    A radioactive form of the metal strontium that is taken up by a part of growing bone. It is being studied in the treatment of bone pain caused by some types of cancer.
  structural racism: (STRUK-cher-ul RAY-sih-zum)
    Pronunciation of dictionary term "structural racism"
    A system of organizational and institutional policies created over time that support a continued unfair advantage for some people and unfair or harmful treatment of others based on their race or ethnic group. Structural racism comes from deep patterns of social, economic, and cultural differences that have developed over time between different groups of people. It affects the physical, social, and economic conditions of where people live, learn, work, and play. Structural racism is a serious problem and can lead to poor health outcomes, such as higher rates of disease and death in certain racial and ethnic groups.
  study agent: (STUH-dee AY-jent)
    Pronunciation of dictionary term "study agent"
    A medicine, vitamin, mineral, food supplement, or a combination of them that is being tested in a clinical trial.
  Sturge-Weber syndrome: (sterj-VAY-ber SIN-drome)
    Pronunciation of dictionary term "Sturge-Weber syndrome"
    A rare, congenital disorder that affects the brain, skin, and eyes. Abnormal blood vessel growth occurs in the trigeminal nerve in the face and the meninges (covering) of the brain. This abnormal growth causes red or purple skin discoloration (sometimes called a port wine stain), usually on one side of the face, and can also cause seizures, learning disabilities, and glaucoma. Also called SWS.
    More Information
    - Sturge-Weber syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7706/sturge-weber-syndrome)
    - Sturge-Weber syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/sturge-weber-syndrome/)
  SU006668: A substance being studied in the treatment of cancer. SU006668 blocks proteins involved in the growth and spread of cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called orantinib and SU6668.
  SU011248: A drug used to treat adults with certain types of gastrointestinal stromal tumors, pancreatic neuroendocrine tumors, or renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. SU011248 blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. SU011248 is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called SU11248, sunitinib malate, and Sutent.
    More Information
    - Sunitinib Malate (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
  SU101: An anticancer drug that works by inhibiting a cancer cell growth factor. Also called leflunomide.
  SU11248: A drug used to treat adults with certain types of gastrointestinal stromal tumors, pancreatic neuroendocrine tumors, or renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. SU11248 blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. SU11248 is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called SU011248, sunitinib malate, and Sutent.
    More Information
    - Sunitinib Malate (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
  SU5416: A substance that has been studied in the treatment of cancer. It belongs to the families of drugs called angiogenesis inhibitors and tyrosine kinase inhibitors. Also called semaxanib.
  SU6668: A substance being studied in the treatment of cancer. SU6668 blocks proteins involved in the growth and spread of cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called orantinib and SU006668.
  subarachnoid block: (sub-uh-RAK-noyd blok)
    Pronunciation of dictionary term "subarachnoid block"
    A temporary loss of feeling in the abdomen and/or the lower part of the body. Special drugs called anesthetics are injected into the fluid in the lower part of the spinal column to cause the loss of feeling. The patient stays awake during the procedure. It is a type of regional anesthesia. Also called SAB, spinal anesthesia, and spinal block.
  subcutaneous: (SUB-kyoo-TAY-nee-us)
    Pronunciation of dictionary term "subcutaneous"
    Beneath the skin.
  subcutaneous port: (SUB-kyoo-TAY-nee-us ...)
    Pronunciation of dictionary term "subcutaneous port"
    A tube surgically placed into a blood vessel and attached to a disk placed under the skin. It is used for the administration of intravenous fluids and drugs; it can also be used to obtain blood samples.
  subependymal: (SUB-eh-PEN-dih-mul)
    Pronunciation of dictionary term "subependymal"
    Describes the layer of cells just under the ependyma (the thin membrane that lines the fluid-filled spaces in the brain and spinal cord).
  subependymal giant cell astrocytoma: (SUB-eh-PEN-dih-mul JY-unt sel AS-troh-sy-TOH-muh)
    Pronunciation of dictionary term "subependymal giant cell astrocytoma"
    A benign (not cancer), slow-growing tumor that usually forms in the walls of fluid-filled spaces in the brain. The tumors are made up of large, star-shaped cells called astrocytes. Subependymal giant cell astrocytomas are common in patients with tuberous sclerosis (an inherited disorder in which benign tumors form in the brain and other parts of the body). Also called SEGA.
  suberoylanilide hydroxamic acid: (SOO-beh-royl-AN-ih-lide hy-drok-SA-mik A-sid)
    Pronunciation of dictionary term "suberoylanilide hydroxamic acid"
    A drug used to treat cutaneous T-cell lymphoma that came back, got worse, or did not get better during or after treatment with two systemic therapies. It is also being studied in the treatment of other types of cancer. Suberoylanilide hydroxamic acid blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase inhibitor. Also called SAHA, vorinostat, and Zolinza.
    More Information
    - Vorinostat (https://www.cancer.gov/about-cancer/treatment/drugs/vorinostat)
  subglottis: (SUB-glah-tis)
    Pronunciation of dictionary term "subglottis"
    The lowest part of the larynx; the area from just below the vocal cords down to the top of the trachea.
    Anatomy of the larynx. The three parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.
    Anatomy of the larynx; drawing shows the epiglottis, supraglottis, glottis, subglottis, and vocal cords. Also shown are the tongue, trachea, and esophagus.
  subjective improvement: (sub-JEK-tiv im-PROOV-ment)
    Pronunciation of dictionary term "subjective improvement"
    In medicine, a term that describes an improvement in a patient's health or well-being based on what is reported by the patient and not what is measured or observed by a health care provider. An example of subjective improvement is when a patient says they feel better.
  submucosa: (sub-myoo-KOH-suh)
    Pronunciation of dictionary term "submucosa"
    The layer of tissue under the mucosa (inner lining of some organs and body cavities that makes mucus).
  subserosa: (sub-seh-ROH-suh)
    Pronunciation of dictionary term "subserosa"
    The layer of tissue under the serosa (outer lining of some organs and body cavities).
  subset analysis: (... uh-NA-lih-sis)
    Pronunciation of dictionary term "subset analysis"
    In a clinical study, the evaluation of results for some but not all of the patients who participated. The selected patients have one or more characteristics in common, such as the same stage of disease or the same hormone receptor status.
  subspecialist: (sub-SPEH-shuh-list)
    Pronunciation of dictionary term "subspecialist"
    In health care, a doctor or other provider who has additional training in a very specific area of medicine. Examples of subspecialists include pediatric oncologists (doctors who have special training in diagnosing and treating cancer in children) and neuroradiologists (doctors who have special training in creating and interpreting images of the nervous system).
  substance abuse: (SUB-stunts uh-BYOOS)
    Pronunciation of dictionary term "substance abuse"
    The use of illegal drugs or the use of prescription or over-the-counter drugs or alcohol for purposes other than those for which they are meant to be used, or in excessive amounts. Substance abuse may lead to social, physical, emotional, and job-related problems.
  subtenon: (SUB-teh-non)
    Pronunciation of dictionary term "subtenon"
    Used to describe injections through the membrane covering the muscles and nerves at the back of the eyeball.
  subtotal hysterectomy: (sub-TOH-tul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "subtotal hysterectomy"
    Surgery to remove the uterus, but not the cervix. Also called partial hysterectomy and supracervical hysterectomy.
  sucralfate: (soo-KRAL-fayt)
    Pronunciation of dictionary term "sucralfate"
    A drug used to treat ulcers. It adheres to proteins at the ulcer site and forms a protective coating over the ulcer. Sucralfate is also used to treat mucositis.
  suction aspiration: (SUK-shun AS-pih-RAY-shun)
    Pronunciation of dictionary term "suction aspiration"
    A surgical procedure in which the cervix is dilated (opened) and vacuum is used to remove tissue from the uterus. Also called suction evacuation and vacuum aspiration.
  suction evacuation: (SUK-shun ee-VA-kyoo-A-shun)
    Pronunciation of dictionary term "suction evacuation"
    A surgical procedure in which the cervix is dilated (opened) and vacuum is used to remove tissue from the uterus. Also called suction aspiration and vacuum aspiration.
  sudden infant death syndrome: (suh-DEN in-FUNT deth SIN-drome)
    Pronunciation of dictionary term "sudden infant death syndrome"
    A disorder marked by the sudden and unexpected death of a healthy child who is younger than one year old, usually during sleep. The cause of sudden infant death syndrome is not known. Also called crib death and SIDS.
  SUFU gene: (… jeen)
    Pronunciation of dictionary term "SUFU gene"
    A gene that is part of a cell signaling pathway involved in the formation of tissues and organs, cell growth, and cell division during embryonic development. Mutations (changes) in the SUFU gene may cause cells to grow and divide too quickly or in an uncontrolled way. This may cause abnormal cells, including cancer cells, to grow. SUFU gene mutations have been found in an inherited condition called basal cell nevus syndrome and in a type of brain cancer called medulloblastoma. The SUFU gene is a type of tumor suppressor gene.
  suicide: (SOO-ih-SIDE)
    Pronunciation of dictionary term "suicide"
    The act of taking one's own life on purpose.
    More Information
    - Depression
  sulfa drug: (SUL-fuh ...)
    Pronunciation of dictionary term "sulfa drug"
    A type of antibiotic used to treat infection. Also called sulfonamide.
  sulfonamide: (sul-FAH-nuh-mide)
    Pronunciation of dictionary term "sulfonamide"
    A type of antibiotic used to treat infection. Also called sulfa drug.
  sulfuric acid: (sul-FYUR-ik A-sid)
    Pronunciation of dictionary term "sulfuric acid"
    A strong acid that, when concentrated, is extremely corrosive to the skin and mucous membranes. It is used in making fertilizers, dyes, electroplating, and industrial explosives.
  sulindac: (SUL-in-dak)
    Pronunciation of dictionary term "sulindac"
    A nonsteroidal anti-inflammatory drug (NSAID) that is being studied as a treatment for cancer.
  sun protection factor: (... proh-TEK-shun FAK-ter)
    Pronunciation of dictionary term "sun protection factor"
    A scale for rating the level of sunburn protection in sunscreen products. The higher the sun protection factor, the more sunburn protection it gives. Sunscreens with a value of 2 through 11 give minimal protection against sunburns. Sunscreens with a value of 12 through 29 give moderate protection. Sun protection factors of 30 or higher give high protection against sunburn. Also called SPF.
  Sun's Soup: (sunz soop)
    Pronunciation of dictionary term "Sun's Soup"
    A mixture of vegetables and other edible plants that has been studied in the treatment of cancer. The vegetables include soybean, shiitake mushroom, mung bean, red date, scallion, garlic, leek, lentil, Hawthorn fruit, onion, ginseng, Angelica root, licorice, dandelion root, senega root, ginger, olive, sesame seed, and parsley. Sun’s Soup is available in the United States as a dietary supplement.
    More Information
    - Selected Vegetables/Sun's Soup
  sunitinib: (soo-NIH-tih-nib)
    Pronunciation of dictionary term "sunitinib"
    A drug used to treat advanced renal cell carcinoma (a type of kidney cancer). It is also used as adjuvant therapy to treat renal cell carcinoma in patients who had surgery to remove the kidney and have a high risk that the cancer will come back. Sunitinib is also used to treat certain types of pancreatic cancer and gastrointestinal stromal tumors (GIST) in some patients. It is also being studied in the treatment of other types of cancer. Sunitinib blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Sunitinib is a type of tyrosine kinase inhibitor and a type of angiogenesis inhibitor. Also called SU011248, SU11248, sunitinib malate, and Sutent.
    More Information
    - Sunitinib Malate (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
  sunitinib malate: (soo-NIH-tih-nib MA-layt)
    Pronunciation of dictionary term "sunitinib malate"
    A drug used to treat adults with certain types of gastrointestinal stromal tumors, pancreatic neuroendocrine tumors, or renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. Sunitinib malate blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Sunitinib malate is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Sunitinib is the active ingredient of sunitinib malate. Also called SU011248, SU11248, and Sutent.
    More Information
    - Sunitinib Malate (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
  sunscreen: (SUN-skreen)
    Pronunciation of dictionary term "sunscreen"
    A substance that helps protect the skin from the sun's harmful rays. Sunscreens reflect, absorb, and scatter both ultraviolet A and B radiation to provide protection against both types of radiation. Using lotions, creams, or gels that contain sunscreens can help protect the skin from premature aging and damage that may lead to skin cancer.
  superficial: (SOO-per-FIH-shul)
    Pronunciation of dictionary term "superficial"
    Affecting cells on the surface. Not invasive.
  superfractionated radiation therapy: (SOO-per FRAK-shuh-NAY-ted RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "superfractionated radiation therapy"
    Radiation treatment in which the total dose of radiation is divided into small doses and treatments are given more than once a day. Superfractionated radiation therapy is given over the same period of time (days or weeks) as standard radiation therapy. Also called hyperfractionated radiation therapy.
  superior vena cava: (soo-PEER-ee-er VEE-nuh KAY-vuh)
    Pronunciation of dictionary term "superior vena cava"
    The large vein that carries blood from the head, neck, arms, and chest to the heart.
  superior vena cava syndrome: (soo-PEER-ee-er VEE-nuh KAY-vuh SIN-drome)
    Pronunciation of dictionary term "superior vena cava syndrome"
    A condition in which a tumor presses against the superior vena cava (the large vein that carries blood from the head, neck, arms, and chest to the heart). This pressure blocks blood flow to the heart and may cause coughing, difficulty in breathing, and swelling of the face, neck, and upper arms.
    More Information
    - Cardiopulmonary Syndromes
  supplemental health insurance: (SUH-pleh-MEN-tul helth in-SHOOR-ents)
    Pronunciation of dictionary term "supplemental health insurance"
    An additional insurance plan that helps pay for health care costs that are not covered by a person’s regular health insurance plan. These costs include copayments, coinsurance, and deductibles. There are many different types of supplemental health insurance, including vision, dental, hospital, accident, disability, long-term care, and Medicare supplemental plans. There are also supplemental health insurance plans for specific conditions, such as cancer, stroke, or kidney failure. Some types of supplemental health insurance may also be used to help pay for food, medicine, transportation, and other expenses related to an illness or injury.
  supplemental nutrition: (SUH-pleh-MEN-tul noo-TRIH-shun)
    Pronunciation of dictionary term "supplemental nutrition"
    A substance or product that is added to a person’s diet to make sure they get all the nutrients they need. It may include vitamins, minerals, protein, or fat, and may be given by mouth, by tube feeding, or into a vein.
  supplemental oxygen therapy: (SUH-pleh-MEN-tul OK-sih-jen THAYR-uh-pee)
    Pronunciation of dictionary term "supplemental oxygen therapy"
    Treatment in which a storage tank of oxygen or a machine called a compressor is used to give oxygen to people with breathing problems. It may be given through a nose tube, a mask, or a tent. The extra oxygen is breathed in along with normal air. Also called oxygen therapy.
  supplementation: (SUH-pleh-men-TAY-shun)
    Pronunciation of dictionary term "supplementation"
    Adding nutrients to the diet.
  support group: (suh-PORT groop)
    Pronunciation of dictionary term "support group"
    A group of people with similar disease or concerns who help each other cope by sharing experiences and information.
  supportive care: (suh-POR-tiv kayr)
    Pronunciation of dictionary term "supportive care"
    Care given to improve the quality of life of people who have an illness or disease by preventing or treating, as early as possible, the symptoms of the disease and the side effects caused by treatment of the disease. Supportive care includes physical, psychological, social, and spiritual support for patients and their families. There are many types of supportive care. Examples include pain management, nutritional support, counseling, exercise, music therapy, meditation, and palliative care. Supportive care may be given with other treatments from the time of diagnosis until the end of life.
    More Information
    - PDQ® Cancer Information Summaries: Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care)
  suppository: (suh-PAH-zih-TOR-ee)
    Pronunciation of dictionary term "suppository"
    A form of medicine contained in a small piece of solid material, such as cocoa butter or glycerin, that melts at body temperature. A suppository is inserted into the rectum, vagina, or urethra and the medicine is absorbed into the bloodstream.
  Supprelin LA: (suh-PREH-lin ...)
    Pronunciation of dictionary term "Supprelin LA"
    A drug used to treat early puberty in males and females. Supprelin LA initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in males and estrogen levels in females. With continued use, Supprelin LA lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in males and estrogen levels in females. Supprelin LA contains the active ingredient histrelin acetate. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist and a type of androgen deprivation therapy that is reversible.
  suppressor T cell: (suh-PREH-ser T sel)
    Pronunciation of dictionary term "suppressor T cell"
    A type of immune cell that blocks the actions of some other types of lymphocytes, to keep the immune system from becoming over-active. Suppressor T cells are being studied in the treatment of cancer. A suppressor T cell is a type of white blood cell and a type of lymphocyte. Also called regulatory T cell, T reg, and T-regulatory cell.
  supracervical hysterectomy: (SOO-pruh-SER-vih-kul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "supracervical hysterectomy"
    Surgery to remove the uterus, but not the cervix. Also called partial hysterectomy and subtotal hysterectomy.
  supraclavicular lymph node: (SOO-pruh-kla-VIH-kyuh-ler...)
    Pronunciation of dictionary term "supraclavicular lymph node"
    A lymph node located above the clavicle (collarbone).
  supraglottic laryngectomy: (SOO-pruh-GLAH-tik LAYR-in-JEK-toh-mee)
    Pronunciation of dictionary term "supraglottic laryngectomy"
    An operation to remove the supraglottis, which is part of the larynx (voice box) above the vocal cords.
  supraglottis: (SOO-pruh-GLAH-tis)
    Pronunciation of dictionary term "supraglottis"
    The upper part of the larynx (voice box), including the epiglottis; the area above the vocal cords.
    Anatomy of the larynx. The three parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.
    Anatomy of the larynx; drawing shows the epiglottis, supraglottis, glottis, subglottis, and vocal cords. Also shown are the tongue, trachea, and esophagus.
  suprarenal gland: (SOO-pruh-REE-nul...)
    Pronunciation of dictionary term "suprarenal gland"
    One of a pair of small, triangle-shaped glands on top of each kidney. Each suprarenal gland has two parts: the adrenal cortex (the outer layer of the suprarenal gland) and the adrenal medulla (the center of the suprarenal gland). The suprarenal glands make steroid hormones, adrenaline, and noradrenaline. These hormones help control many important body functions, including heart rate, blood pressure, blood sugar, metabolism, and the way the body reacts to stress. The suprarenal glands also make hormones that balance water and salt in the body and are involved in the development of sex characteristics. Also called adrenal gland.
    More Information
    - Adrenocortical Carcinoma (https://www.cancer.gov/types/adrenocortical)
    - Pheochromocytoma and Paraganglioma Treatment
    Anatomy of the adrenal gland. There are two adrenal glands, one on top of each kidney. The outer part of each gland is the adrenal cortex and the inner part is the adrenal medulla.
    Anatomy of the adrenal gland; drawing of the abdomen showing the left and right adrenal glands, the left and right kidneys, and major blood vessels. Also shown is an inset of an adrenal gland showing the adrenal cortex and the adrenal medulla.
  supratentorium: (SOO-pruh-ten-TOR-ee-um)
    Pronunciation of dictionary term "supratentorium"
    The upper part of the brain that contains the cerebrum, ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, and optic nerve. Examples of tumors that form in the supratentorium are glioblastomas, pineal region tumors, and ependymomas.
  suramin: (SOO-ruh-min)
    Pronunciation of dictionary term "suramin"
    A drug that is used to treat infections caused by parasites. It is also being studied in the treatment of cancer. It belongs to the families of drugs called antiprotozoals and anthelmintics.
  surface electrode: (SER-fus ee-LEK-trode)
    Pronunciation of dictionary term "surface electrode"
    A small device that is attached to the skin to measure or cause electrical activity in the tissue under it. Surface electrodes may be used to look for problems with muscles and nerves.
  surgeon: (SER-jun)
    Pronunciation of dictionary term "surgeon"
    A doctor who removes or repairs a part of the body by operating on the patient.
  Surgeon General: (SER-jun JEH-neh-rul)
    Pronunciation of dictionary term "Surgeon General"
    The chief medical doctor and health educator for the United States. The mission of the U.S. Surgeon General is to give the public the best scientific information available on how to improve health and lower the risk of illness and injury. The U.S. Surgeon General oversees the U.S. Public Health Service and is chosen by the U.S. President. Each state public health agency and branch of the U.S. military also has its own Surgeon General. The office of the U.S. Surgeon General is part of the Department of Health and Human Services (DHHS).
  surgery: (SER-juh-ree)
    Pronunciation of dictionary term "surgery"
    A procedure to remove or repair a part of the body or to find out whether disease is present. Also called operation.
  surgical biopsy: (SER-jih-kul BY-op-see)
    Pronunciation of dictionary term "surgical biopsy"
    A procedure in which a cut is made through the skin to remove abnormal tissue so it can be checked under a microscope for signs of disease. The two types of surgical biopsy are incisional biopsy, in which part of a lump or a sample of tissue is removed, and excisional biopsy, in which an entire lump or suspicious area is removed. Also called open biopsy.
  surgical castration: (SER-jih-kul kas-TRAY-shun)
    Pronunciation of dictionary term "surgical castration"
    Surgical removal of the testicles (orchiectomy) or ovaries (oophorectomy) to stop the production of sex hormones. Decreasing the levels of hormones may stop the growth of certain cancers.
  surgical excision: (SER-jih-kul ek-SIH-zhun)
    Pronunciation of dictionary term "surgical excision"
    The removal of tissue from the body using a scalpel (a sharp knife), laser, or other cutting tool. A surgical excision is usually done to remove a lump or other suspicious growth. Some normal tissue around the lump is usually removed at the same time.
  surgical menopause: (SER-jih-kul MEH-nuh-pawz)
    Pronunciation of dictionary term "surgical menopause"
    Describes a stop in a woman’s menstrual periods that is caused by surgery to remove her ovaries. Symptoms of menopause include hot flashes, mood swings, night sweats, vaginal dryness, trouble concentrating, and infertility.
  surgical oncologist: (SER-jih-kul on-KAH-loh-jist)
    Pronunciation of dictionary term "surgical oncologist"
    A surgeon who has special training in performing biopsies and other surgical procedures in cancer patients.
  surrogate endpoint: (SER-uh-gut END-poynt)
    Pronunciation of dictionary term "surrogate endpoint"
    In clinical trials, an indicator or sign used in place of another to tell if a treatment works. Surrogate endpoints include a shrinking tumor or lower biomarker levels. They may be used instead of stronger indicators, such as longer survival or improved quality of life, because the results of the trial can be measured sooner. The use of surrogate endpoints in clinical trials may allow earlier approval of new drugs to treat serious or life-threatening diseases, such as cancer. Surrogate endpoints are not always true indicators or signs of how well a treatment works.
  surrogate pregnancy: (SER-uh-gut PREG-nun-see)
    Pronunciation of dictionary term "surrogate pregnancy"
    A type of pregnancy in which a woman carries and gives birth to a baby for a person who is not able to have children. In a surrogate pregnancy, eggs from the woman who will carry the baby or from an egg donor are fertilized with sperm from a sperm donor to make an embryo. The embryo is implanted in the uterus of the surrogate mother, who carries the baby until birth. Surrogate pregnancy may be an option for men or women who want to have children and have had certain anticancer treatments, such as chemotherapy or radiation therapy, that can cause infertility.
  surveillance: (ser-VAY-lents)
    Pronunciation of dictionary term "surveillance"
    In medicine, closely watching a patient’s condition but not treating it unless there are changes in test results. Surveillance is also used to find early signs that a disease has come back. It may also be used for a person who has an increased risk of a disease, such as cancer. During surveillance, certain exams and tests are done on a regular schedule. In public health, surveillance may also refer to the ongoing collection of information about a disease, such as cancer, in a certain group of people. The information collected may include where the disease occurs in a population and whether it affects people of a certain gender, age, or ethnic group.
  Surveillance, Epidemiology, and End Results Program: (ser-VAY-lents EH-pih-dee-mee-AH-loh-jee … reh-ZULTS PROH-gram)
    Pronunciation of dictionary term "Surveillance, Epidemiology, and End Results Program"
    A program of the National Cancer Institute that uses information collected by cancer registries to report on the number of new cases of cancer diagnosed and the number of cancer deaths across different geographic areas in the United States. These cancer statistics are updated every year and provide information on cancer cases based on patient demographics (such as age, gender, race, and ethnic group), the primary tumor site, the form and structure of the tumor, the stage of cancer at diagnosis, the first course of treatment, and patient survival information. The Surveillance, Epidemiology, and End Results Program also works with other organizations involved in cancer surveillance activities and supports research studies on cancer prevention and control. Also called SEER Program.
    More Information
    - Surveillance, Epidemiology, and End Results Program (https://seer.cancer.gov/)
  survival rate: (ser-VY-vul ...)
    Pronunciation of dictionary term "survival rate"
    The percentage of people in a study or treatment group who are still alive for a certain period of time after they were diagnosed with or started treatment for a disease, such as cancer. The survival rate is often stated as a five-year survival rate, which is the percentage of people in a study or treatment group who are alive five years after their diagnosis or the start of treatment. Also called overall survival rate.
  survivor: (ser-VY-ver)
    Pronunciation of dictionary term "survivor"
    One who remains alive and continues to function during and after overcoming a serious hardship or life-threatening disease. In cancer, a person is considered to be a survivor from the time of diagnosis until the end of life.
    More Information
    - Cancer Survivorship (https://www.cancer.gov/about-cancer/coping/survivorship)
  survivorship: (ser-VY-ver-ship)
    Pronunciation of dictionary term "survivorship"
    In cancer, survivorship focuses on the health and well-being of a person with cancer from the time of diagnosis until the end of life. This includes the physical, mental, emotional, social, and financial effects of cancer that begin at diagnosis and continue through treatment and beyond. The survivorship experience also includes issues related to follow-up care (including regular health and wellness checkups), late effects of treatment, cancer recurrence, second cancers, and quality of life. Family members, friends, and caregivers are also considered part of the survivorship experience.
    More Information
    - Cancer Survivorship (https://www.cancer.gov/about-cancer/coping/survivorship)
  survivorship care plan: (ser-VY-ver-ship kayr plan)
    Pronunciation of dictionary term "survivorship care plan"
    A detailed plan given to a patient after treatment ends, that contains a summary of the patient’s treatment, along with recommendations for follow-up care. In cancer, the plan is based on the type of cancer and the treatment the patient received. A survivorship care plan may include schedules for physical exams and medical tests to see if the cancer has come back or spread to other parts of the body. Getting follow-up care also helps check for health problems that may occur months or years after treatment ends, including other types of cancer. A survivorship care plan may also include information to help meet the emotional, social, legal, and financial needs of the patient. It may include referrals to specialists and recommendations for a healthy lifestyle, such as changes in diet and exercise and quitting smoking. Also called follow-up care plan.
    More Information
    - Follow-Up Medical Care (https://www.cancer.gov/about-cancer/coping/survivorship/follow-up-care)
  susceptibility gene mutation: (suh-SEP-tih-BIH-lih-tee jeen myoo-TAY-shun)
    Pronunciation of dictionary term "susceptibility gene mutation"
    A change in the DNA sequence of a gene that causes a person to have or be at risk of developing a certain genetic disorder or disease, such as cancer. Susceptibility gene mutations can be inherited from a parent or occur during a person’s lifetime. Knowing if a person has a susceptibility gene mutation may help prevent, diagnose, and treat diseases, such as cancer. Not everyone who has a susceptibility gene mutation will develop the disease. Also called deleterious mutation, disease-causing mutation, pathogenic variant, and predisposing mutation.
  Sustiva: (suh-STEE-vuh)
    Pronunciation of dictionary term "Sustiva"
    A drug used with other drugs to treat infection with the human immunodeficiency virus (HIV). It blocks HIV from making copies of itself. It is a type of non-nucleoside reverse transcriptase inhibitor and a type of antiviral agent. Also called efavirenz.
  Sustol: (SUS-tol)
    Pronunciation of dictionary term "Sustol"
    A drug used alone or with other drugs in adults to prevent nausea and vomiting caused by chemotherapy. Sustol blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Sustol is a type of antiemetic and a type of serotonin receptor antagonist. Also called granisetron and Sancuso.
    More Information
    - Granisetron (https://www.cancer.gov/about-cancer/treatment/drugs/granisetron)
  Sutent: (SOO-tent)
    Pronunciation of dictionary term "Sutent"
    A drug used to treat adults with certain types of gastrointestinal stromal tumors, pancreatic neuroendocrine tumors, or renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. Sutent blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Sutent is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called SU011248, SU11248, and sunitinib malate.
    More Information
    - Sunitinib Malate (https://www.cancer.gov/about-cancer/treatment/drugs/sunitinibmalate)
  SV40: Simian virus 40. A virus that infects some types of monkeys. It may also infect humans, and was found in some polio vaccines tested in the early 1960s. Although the virus has been shown to cause cancer in laboratory animals, there is no evidence that it causes cancer in people. Also called simian virus 40.
  SVV-001: A virus being studied in the treatment of neuroendocrine tumors and other types of cancer. Neuroendocrine tumors form from cells that release hormones in response to a signal from the nervous system. The virus infects and breaks down these tumor cells but not normal cells. It is a type of oncolytic virus. Also called NTX-010 and Seneca Valley virus-001.
  sweet elm: (sweet elm)
    Pronunciation of dictionary term "sweet elm"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called gray elm, Indian elm, red elm, slippery elm, Ulmus fulva, and Ulmus rubra.
  SWS: A rare, congenital disorder that affects the brain, skin, and eyes. Abnormal blood vessel growth occurs in the trigeminal nerve in the face and the meninges (covering) of the brain. This abnormal growth causes red or purple skin discoloration (sometimes called a port wine stain), usually on one side of the face, and can also cause seizures, learning disabilities, and glaucoma. Also called Sturge-Weber syndrome.
    More Information
    - Sturge-Weber syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7706/sturge-weber-syndrome)
    - Sturge-Weber syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/sturge-weber-syndrome/)
  Swyer syndrome: (SWY-er SIN-drome)
    Pronunciation of dictionary term "Swyer syndrome"
    A rare genetic condition in which people who have an X chromosome and a Y chromosome (the usual pattern for males) look female. They have normal female reproductive organs, including a uterus, fallopian tubes, and vagina. However, the ovaries do not develop and are replaced by clumps of tissue where they would normally form. Swyer syndrome is usually not diagnosed until puberty, when menstrual periods do not begin as they should. Having Swyer syndrome increases the risk of certain types of germ cell tumors.
    More Information
    - Swyer syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/swyer-syndrome/)
    - Swyer syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5068/swyer-syndrome)
  Syk kinase inhibitor R-935788: (sik KY-nays in-HIH-bih-ter …)
    Pronunciation of dictionary term "Syk kinase inhibitor R-935788"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults with chronic immune thrombocytopenia (ITP) that did not get better with other treatment. ITP is a condition in which platelets are destroyed by the immune system. Syk kinase inhibitor R-935788 is also being studied in the treatment of other conditions and types of cancer. It blocks an enzyme called Syk, which may help keep the immune system from destroying platelets. Syk kinase inhibitor R-935788 is a type of tyrosine kinase inhibitor. Also called fostamatinib disodium, R788 sodium, and Tavalisse.
  Sylatron: (SY-luh-tron)
    Pronunciation of dictionary term "Sylatron"
    A drug that is no longer available in the United States that contains the active ingredient peginterferon alfa-2b and was used to prevent melanoma from coming back after it has been removed by surgery. Sylatron is a type of cytokine and a type of immunomodulating agent.
  Sylvant: (SIL-vant)
    Pronunciation of dictionary term "Sylvant"
    A drug used to treat a rare condition called multicentric Castleman disease in patients who do not have HIV or human herpesvirus 8. It is also being studied in the treatment of some types of cancer and other conditions. Sylvant binds to a protein called interleukin-6 (IL-6), which is made by some white blood cells and other cells in the body. Sylvant may help reduce inflammation and stop the growth of cancer cells or abnormal blood cells. It is a type of monoclonal antibody. Also called anti-IL-6 chimeric monoclonal antibody, cCLB8, CNTO 328, and siltuximab.
    More Information
    - Siltuximab (https://www.cancer.gov/about-cancer/treatment/drugs/siltuximab)
  sympathetic nervous system: (SIM-puh-THEH-tik NER-vus SIS-tem)
    Pronunciation of dictionary term "sympathetic nervous system"
    The part of the nervous system that increases heart rate, blood pressure, breathing rate, and pupil size. It also causes blood vessels to narrow and decreases digestive juices.
  symptom: (SIMP-tum)
    Pronunciation of dictionary term "symptom"
    Something that a person feels or experiences that may indicate that they have a disease or condition. Symptoms can only be reported by the person experiencing them. They cannot be observed by a health care provider or other person and do not show up on medical tests. Some examples of symptoms are pain, nausea, fatigue, and anxiety.
  symptom management: (SIMP-tum MA-nij-ment)
    Pronunciation of dictionary term "symptom management"
    Care given to help relieve the symptoms of a disease, such as cancer, and the side effects caused by treatment of the disease. Symptom management may help a person feel more comfortable, but it does not treat or cure the disease. It may involve taking certain medicines to relieve pain or nausea or using guided imagery or deep breathing exercises to reduce stress or anxiety. Symptom management is one aspect of palliative care and supportive care.
  symptomatic: (SIMP-toh-MA-tik)
    Pronunciation of dictionary term "symptomatic"
    Having to do with symptoms, which are signs of a condition or disease.
  synapse: (SIH-naps)
    Pronunciation of dictionary term "synapse"
    The space between the end of a nerve cell and another cell. Nerve impulses are usually carried to the neighboring cell by chemicals called neurotransmitters, which are released by the nerve cell and are taken up by another cell on the other side of the synapse. The neighboring cell may be another nerve cell, a muscle cell, or a gland cell.
  syncytium: (sin-SIH-shee-um)
    Pronunciation of dictionary term "syncytium"
    A large cell-like structure formed by the joining together of two or more cells. The plural is syncytia.
  syndrome: (SIN-drome)
    Pronunciation of dictionary term "syndrome"
    A set of symptoms or conditions that occur together and suggest the presence of a certain disease or an increased chance of developing the disease.
  synergistic: (SIH-ner-JIS-tik)
    Pronunciation of dictionary term "synergistic"
    In medicine, describes the interaction of two or more drugs when their combined effect is greater than the sum of the effects seen when each drug is given alone.
  syngeneic: (SIN-jeh-NAY-ik)
    Pronunciation of dictionary term "syngeneic"
    Having to do with individuals or tissues that have identical genes. For example, identical twins and cells and tissues from them are syngeneic.
  syngeneic bone marrow transplant: (SIN-jeh-NAY-ik bone MAYR-oh TRANZ-plant)
    Pronunciation of dictionary term "syngeneic bone marrow transplant"
    A procedure in which a patient receives healthy stem cells (blood-forming cells) to replace their own stem cells that have been destroyed by treatment with radiation or high doses of chemotherapy. In a syngeneic bone marrow transplant, the healthy stem cells come from the bone marrow of the patient’s healthy identical twin.
  syngeneic stem cell transplantation: (SIN-jeh-NAY-ik stem sel tranz-plan-TAY-shun)
    Pronunciation of dictionary term "syngeneic stem cell transplantation"
    A procedure in which a patient receives blood-forming stem cells (cells from which all blood cells develop) donated by his or her healthy identical twin.
  synovial membrane: (sih-NOH-vee-ul MEM-brayn)
    Pronunciation of dictionary term "synovial membrane"
    A layer of connective tissue that lines the cavities of joints, tendon sheaths, and bursae (fluid-filled sacs between tendons and bones). The synovial membrane makes synovial fluid, which has a lubricating function.
  synovial sarcoma: (sih-NOH-vee-ul sar-KOH-muh)
    Pronunciation of dictionary term "synovial sarcoma"
    A type of cancer that usually forms in the tissue around the joints in the arms or legs. It may also form in the trunk (chest and abdomen), or the head and neck and it may spread to the lungs, bones, and lymph nodes. Synovial sarcoma usually occurs in children and young adults. It is a type of soft tissue sarcoma.
  Synovir: (SIH-noh-veer)
    Pronunciation of dictionary term "Synovir"
    A drug used with another drug to treat multiple myeloma in patients who have just been diagnosed. It is also used to treat a painful skin disease related to leprosy. It is being studied in the treatment of other types of cancer. Synovir may help the immune system kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of immunomodulating agent. Also called thalidomide and Thalomid.
  synovitis: (SIH-noh-VY-tis)
    Pronunciation of dictionary term "synovitis"
    Inflammation (swelling, pain, and warmth) of a synovial membrane, which is a layer of connective tissue that lines a joint, such as the hip, knee, ankle, or shoulder. Synovitis is caused by some types of arthritis and other diseases.
  Synribo: (sin-RY-boh)
    Pronunciation of dictionary term "Synribo"
    A drug used to treat adults with certain types of chronic myelogenous leukemia that cannot be treated with tyrosine kinase inhibitors (a type of anticancer drug) or that have not gotten better after treatment with at least two tyrosine kinase inhibitors. It is also being studied in the treatment of other types of cancer. Synribo blocks certain proteins involved in cell growth and may kill cancer cells. It is a type of plant alkaloid and a type of protein synthesis inhibitor. Also called homoharringtonine and omacetaxine mepesuccinate.
    More Information
    - Omacetaxine Mepesuccinate (https://www.cancer.gov/about-cancer/treatment/drugs/omacetaxinemepesuccinate)
  synthetic: (sin-THEH-tik)
    Pronunciation of dictionary term "synthetic"
    Having to do with substances that are man-made instead of taken from nature.
  synthetic human secretin: (sin-THEH-tik HYOO-mun seh-KREE-tin)
    Pronunciation of dictionary term "synthetic human secretin"
    A drug used to help diagnose gastrinomas (tumors that cause too much gastric acid to be made) and other problems with the pancreas. It is also used to increase secretions from the pancreas and to help identify a duct called the ampulla of Vater. Synthetic human secretin is a form of secretin that is made in the laboratory. Secretin causes the pancreas, liver, and stomach to release substances that help digest food. Also called ChiRhoStim and secretin human.
  synthetic lethality: (sin-THEH-tik lee-THA-luh-tee)
    Pronunciation of dictionary term "synthetic lethality"
    Describes a situation in which mutations (changes) in two genes together result in cell death, but a mutation in either gene alone does not. Cancer cells that only have one mutated gene in a specific pair of genes can depend on the normal partner gene for survival. Interfering with the function of the normal partner gene may cause cancer cells to die. Studying synthetic lethality may help researchers learn more about the function of genes and develop new drugs to treat cancer.
  synthetic protegrin analog: (sin-THEH-tik proh-TEH-grin A-nuh-log)
    Pronunciation of dictionary term "synthetic protegrin analog"
    A form of a protegrin that is made in the laboratory. Protegrins kill certain bacteria, fungi, and viruses by making holes in their outer membranes and causing them to burst. Synthetic protegrin analogs, such as iseganan, are being studied in the treatment of oral mucositis (painful mouth sores) caused by radiation therapy. It is a type of synthetic antimicrobial peptide.
  synthetic retinoid: (sin-THEH-tik REH-tih-noyd)
    Pronunciation of dictionary term "synthetic retinoid"
    A substance related to vitamin A that is produced in a laboratory.
  syringe: (suh-RINJ)
    Pronunciation of dictionary term "syringe"
    A small hollow tube used for injecting or withdrawing liquids. It may be attached to a needle in order to withdraw fluid from the body or inject drugs into the body.
  systematic biopsy: (SIS-tuh-MA-tik BY-op-see)
    Pronunciation of dictionary term "systematic biopsy"
    A procedure in which many samples of tissue (usually 12) are removed via a long needle from different areas of the prostate to examine under a microscope. An ultrasound is used to guide the needle through the rectum into the prostate. This type of biopsy does not target specific areas of the prostate. Systematic biopsy is used to help diagnose prostate cancer.
  systemic: (sis-TEH-mik)
    Pronunciation of dictionary term "systemic"
    Affecting the entire body.
  systemic chemotherapy: (sis-TEH-mik KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "systemic chemotherapy"
    Treatment with anticancer drugs that travel through the blood to cells all over the body.
  systemic disease: (sis-TEH-mik dih-ZEEZ)
    Pronunciation of dictionary term "systemic disease"
    Disease that affects the whole body.
  systemic inflammatory response syndrome: (sis-TEH-mik in-FLA-muh-TOR-ee reh-SPONTS SIN-drome)
    Pronunciation of dictionary term "systemic inflammatory response syndrome"
    A serious condition in which there is inflammation throughout the whole body. Systemic inflammatory response syndrome may be caused by an infection, trauma, surgery, ischemia (lack of blood supply to a part of the body), or certain conditions, such as an autoimmune disorder or pancreatitis. To be diagnosed with systemic inflammatory response syndrome, a person must have two or more of the following: low or high body temperature, increased heart rate, increased breathing rate, and an abnormal white blood cell count. When systemic inflammatory response syndrome occurs as a result of a known infection, it may be called sepsis. Sepsis can be severe or life threatening and lead to multiple organ failure and shock. Also called SIRS.
  systemic lupus erythematosus: (sis-TEH-mik LOO-pus AYR-ih-THEE-muh-TOH-sus)
    Pronunciation of dictionary term "systemic lupus erythematosus"
    A chronic, inflammatory, connective tissue disease that can affect the joints and many organs, including the skin, heart, lungs, kidneys, and nervous system. It can cause many different symptoms; however, not everyone with systemic lupus erythematosus has all of the symptoms. Also called lupus and SLE.
  systemic mastocytosis: (sis-TEH-mik MAS-toh-sy-TOH-sis)
    Pronunciation of dictionary term "systemic mastocytosis"
    A rare disease in which too many mast cells (a type of immune system cell) are found in the skin, bones, joints, lymph nodes, liver, spleen, and gastrointestinal tract. Mast cells give off chemicals, such as histamine, that can cause flushing (a hot, red face), itching, abdominal cramps, muscle pain, nausea, vomiting, diarrhea, low blood pressure, and shock.
    More Information
    - Systemic mastocytosis (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/8616/systemic-mastocytosis)
    - Systemic mastocytosis (MedlinePlus) (https://medlineplus.gov/genetics/condition/systemic-mastocytosis/)
  systemic mastocytosis with associated hematologic neoplasm: (sis-TEH-mik MAS-toh-sy-TOH-sis … uh-SOH-see-ay-ted HEE-muh-tuh-LAH-jik NEE-oh-PLA-zum)
    Pronunciation of dictionary term "systemic mastocytosis with associated hematologic neoplasm"
    A rare condition in which too many mast cells (a type of white blood cell) build up in certain tissues and organs in the body, including the bone marrow, lymph nodes, bone, liver, spleen, and small intestine, and may damage them. In systemic mastocytosis with associated hematologic neoplasm, this mast cell buildup occurs together with another blood disorder, usually a myelodysplastic syndrome, myeloproliferative disorder, or acute myeloid leukemia (AML). Systemic mastocytosis with associated hematologic neoplasm usually occurs in adults. Also called SM-AHN.
  systemic radiation therapy: (sis-TEH-mik RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "systemic radiation therapy"
    A type of radiation therapy in which a radioactive substance, such as radioactive iodine or a radioactively labeled monoclonal antibody, is swallowed or injected into the body and travels through the blood, locating and killing tumor cells.
  systemic scleroderma: (sis-TEH-mik SKLAYR-oh-DER-muh)
    Pronunciation of dictionary term "systemic scleroderma"
    A disease that is marked by hardening and thickening of skin, connective tissue that surrounds other tissues and organs, and blood vessels. Also called systemic sclerosis.
  systemic sclerosis: (sis-TEH-mik skleh-ROH-sis)
    Pronunciation of dictionary term "systemic sclerosis"
    A disease that is marked by hardening and thickening of skin, connective tissue that surrounds other tissues and organs, and blood vessels. Also called systemic scleroderma.
  systemic therapy: (sis-TEH-mik THAYR-uh-pee)
    Pronunciation of dictionary term "systemic therapy"
    Treatment using substances that travel through the bloodstream, reaching and affecting cells all over the body.
  Sézary cell: (sey-zah-REE sel)
    Pronunciation of dictionary term "Sezary cell"
    A cancerous T cell (a type of white blood cell) found in the blood, skin, and lymph nodes of patients who have a fast-growing type of skin lymphoma called Sézary syndrome. Under a microscope, Sézary cells have an abnormally shaped nucleus and look larger than normal T cells.
  Sézary syndrome: (sey-zah-REE SIN-drome)
    Pronunciation of dictionary term "Sezary syndrome"
    A cancer that affects the skin. It is a form of cutaneous T-cell lymphoma.
    More Information
    - Mycosis Fungoides (Including Sézary Syndrome) Treatment
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  T cell: (... sel)
    Pronunciation of dictionary term "T cell"
    A type of white blood cell. T cells are part of the immune system and develop from stem cells in the bone marrow. They help protect the body from infection and may help fight cancer. Also called T lymphocyte and thymocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  T lymphocyte: (… LIM-foh-site)
    Pronunciation of dictionary term "T lymphocyte"
    A type of white blood cell. T lymphocytes are part of the immune system and develop from stem cells in the bone marrow. They help protect the body from infection and may help fight cancer. Also called T cell and thymocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  T reg: (... reg)
    Pronunciation of dictionary term "T reg"
    A type of immune cell that blocks the actions of some other types of lymphocytes, to keep the immune system from becoming over-active. T regs are being studied in the treatment of cancer. A T reg is a type of white blood cell and a type of lymphocyte. Also called regulatory T cell, suppressor T cell, and T-regulatory cell.
  t test: (... test)
    Pronunciation of dictionary term "t test"
    A statistical test that is used to find out if there is a real difference between the means (averages) of two different groups. It is sometimes used to see if there is a significant difference in response to treatment between groups in a clinical trial.
  T-3: A thyroid hormone. Also called triiodothyronine.
  t-AML: A type of acute myeloid leukemia (AML) that is caused by previous treatment with chemotherapy or radiation therapy. t-AML is an aggressive (fast-growing) cancer in which there are too many myeloblasts (immature white blood cells) in the blood or bone marrow. t-AML usually occurs within 7 years after treatment. It is more common in adults. Also called therapy-related acute myeloid leukemia.
  T-cell acute lymphoblastic leukemia: (T-sel uh-KYOOT LIM-foh-BLAS-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "T-cell acute lymphoblastic leukemia"
    An aggressive (fast-growing) type of leukemia (blood cancer) in which too many T-cell lymphoblasts (immature white blood cells) are found in the bone marrow and blood. Also called precursor T-lymphoblastic leukemia and T-cell acute lymphocytic leukemia.
  T-cell acute lymphocytic leukemia: (T-sel uh-KYOOT LIM-foh-SIH-tik loo-KEE-mee-uh)
    Pronunciation of dictionary term "T-cell acute lymphocytic leukemia"
    An aggressive (fast-growing) type of leukemia (blood cancer) in which too many T-cell lymphoblasts (immature white blood cells) are found in the bone marrow and blood. Also called precursor T-lymphoblastic leukemia and T-cell acute lymphoblastic leukemia.
  T-cell depletion: (... sel dih-PLEE-shun)
    Pronunciation of dictionary term "T-cell depletion"
    Treatment to destroy T cells, which play an important role in the immune response. Elimination of T cells from a bone marrow graft from a donor may reduce the chance of an immune reaction against the recipient's tissues.
  T-cell exhaustion: (… sel eg-ZOS-chun)
    Pronunciation of dictionary term "T-cell exhaustion"
    Describes a condition in which T cells (a type of immune cell) lose their ability to kill certain cells, such as cancer cells or cells infected with a virus. This can happen when cancer, chronic infection, or other conditions cause the body’s immune system to stay active for a long time. Exhausted T cells have high amounts of immune checkpoint proteins on their surface, which may keep the activity of the T cells suppressed. In cancer treatment, drugs that target these proteins may be given to allow the T cells to better kill cancer cells. Learning more about T-cell exhaustion may help in the development of new types of immunotherapy to treat cancer.
  T-cell large granular lymphocyte leukemia: (… sel larj GRAN-yoo-lur LIM-foh-site loo-KEE-mee-uh)
    Pronunciation of dictionary term "T-cell large granular lymphocyte leukemia"
    A type of leukemia in which large T lymphocytes (a type of white blood cell) that contain granules (small particles) are found in the blood. It is a chronic disease that may last for a long time and get worse. Also called T-LGL leukemia.
  T-cell lymphoma: (... sel lim-FOH-muh)
    Pronunciation of dictionary term "T-cell lymphoma"
    A type of cancer that forms in T cells (a type of immune system cell). T-cell lymphomas may be either indolent (slow-growing) or aggressive (fast-growing). Most T-cell lymphomas are non-Hodgkin lymphomas. There are many different types of T-cell non-Hodgkin lymphomas. These include mycosis fungoides, anaplastic large cell lymphoma, and precursor T-lymphoblastic lymphoma. Prognosis and treatment depend on type and stage of the cancer.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  T-cell receptor: (… sel reh-SEP-ter)
    Pronunciation of dictionary term "T-cell receptor"
    A group of proteins found on T cells (a type of immune cell that recognizes and binds to foreign substances). T-cell receptors bind to certain antigens (proteins) found on abnormal cells, cancer cells, cells from other organisms, and cells infected with a virus or another microorganism. This interaction causes the T cells to attack these cells and helps the body fight infection, cancer, or other diseases. Also called TCR.
  T-cell receptor gene rearrangement test: (… reh-SEP-ter jeen REE-uh-RAYNJ-ment …)
    Pronunciation of dictionary term "T-cell receptor gene rearrangement test"
    A laboratory test in which cells in a sample of blood or bone marrow are checked to see if there are certain changes in the genes that make receptors on T cells (white blood cells). Testing for these gene changes can tell whether large numbers of T cells with a certain T-cell receptor are being made. This may be a sign of T-cell lymphoma or leukemia.
  T-cell transfer therapy: (… sel TRANZ-fer THAYR-uh-pee)
    Pronunciation of dictionary term "T-cell transfer therapy"
    A type of immunotherapy in which T cells (a type of immune cell) are given to a patient to help the body fight diseases, such as cancer. In cancer therapy, T cells are usually taken from the patient's own blood or tumor tissue, grown in large numbers in the laboratory, and then given back to the patient to help the immune system fight the cancer. Sometimes, the T cells are changed in the laboratory to make them better able to target the patient's cancer cells and kill them. Types of T-cell transfer therapy include chimeric antigen receptor T-cell (CAR T-cell) therapy and tumor-infiltrating lymphocyte (TIL) therapy. T-cell transfer therapy that uses T cells from a donor is being studied in the treatment of some types of cancer and some infections. Also called adoptive cell therapy, adoptive cell transfer, and cellular adoptive immunotherapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
    T-Cell Transfer Therapy
    Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called T-cell transfer therapy that is used to treat cancer.
    YouTube (https://www.youtube.com/watch?v=kfi-2fPp4dE)
  T-DM1: A drug used to treat certain patients with HER2-positive breast cancer that has already been treated with trastuzumab and a type of anticancer drug called a taxane. It is also being studied in the treatment of other types of cancer. T-DM1 contains a monoclonal antibody called trastuzumab that binds to a protein called HER2, which is found on some breast cancer cells. It also contains an anticancer drug called DM1, which may help kill cancer cells. T-DM1 is a type of antibody-drug conjugate. Also called ado-trastuzumab emtansine and Kadcyla.
    More Information
    - Ado-Trastuzumab Emtansine (https://www.cancer.gov/about-cancer/treatment/drugs/ado-trastuzumab-emtansine)
  T-LGL leukemia: (... loo-KEE-mee-uh)
    Pronunciation of dictionary term "T-LGL leukemia"
    A type of leukemia in which large T lymphocytes (a type of white blood cell) that contain granules (small particles) are found in the blood. It is a chronic disease that may last for a long time and get worse. Also called T-cell large granular lymphocyte leukemia.
  T-lymphoblastic lymphoma: (T-LIM-foh-BLAS-tik lim-FOH-muh)
    Pronunciation of dictionary term "T-lymphoblastic lymphoma"
    A type of non-Hodgkin lymphoma in which too many T-cell lymphoblasts (immature white blood cells) are found in the lymph nodes and spleen. It is most common in young men. Also called precursor T-lymphoblastic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  T-regulatory cell: (T-REH-gyoo-luh-TOR-ee sel)
    Pronunciation of dictionary term "T-regulatory cell"
    A type of immune cell that blocks the actions of some other types of lymphocytes, to keep the immune system from becoming over-active. T-regulatory cells are being studied in the treatment of cancer. A T-regulatory cell is a type of white blood cell and a type of lymphocyte. Also called regulatory T cell, suppressor T cell, and T reg.
  T-VEC: A drug used to treat melanoma that has recurred (come back) after surgery. It is used in patients whose cancer is in the skin and lymph nodes and cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. T-VEC is made with a form of the herpesvirus that has been changed in the laboratory to infect and break down cancer cells without harming normal cells. It may also help the immune system kill cancer cells. T-VEC is injected directly into tumors in the skin and lymph nodes. It is a type of oncolytic virus therapy. Also called Imlygic and talimogene laherparepvec.
    More Information
    - Talimogene Laherparepvec (https://www.cancer.gov/about-cancer/treatment/drugs/talimogenelaherparepvec)
  T138067: An anticancer drug that belongs to the family of drugs called mitotic inhibitors. It inhibits the growth of cancer cells by preventing cell division.
  T315I mutation: (… myoo-TAY-shun)
    Pronunciation of dictionary term "T315I mutation"
    A type of mutation (change) in the BCR::ABL1 fusion protein, which is an abnormal protein found in most people with chronic myelogenous leukemia and in some with acute lymphoblastic leukemia. The T315I mutation may make cancer cells resistant (unable to respond) to anticancer drugs called tyrosine kinase inhibitors. Checking for the T315I mutation in cancer cells may help plan cancer treatment.
  T4: A hormone that is made by the thyroid gland and contains iodine. T4 increases the rate of chemical reactions in cells and helps control growth and development. T4 can also be made in the laboratory and is used to treat thyroid disorders. Also called L-3,5,5’-tetraiodothyronine, thyroxin, and thyroxine.
  T4N5 liposomal lotion: (... LY-poh-SOH-mul LOH-shun)
    Pronunciation of dictionary term "T4N5 liposomal lotion"
    A lotion being studied in the treatment of skin cancer and a skin condition called xeroderma pigmentosum. It has an enzyme contained in very tiny, fat-like particles. The enzyme repairs damage caused by ultraviolet radiation. T4N5 liposomal lotion is a type of DNA repair enzyme topical agent. Also called Dimericine.
  T900607: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called tubulin-binding agents.
  Tabloid: (TAB-loyd)
    Pronunciation of dictionary term "Tabloid"
    A drug used to treat acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. Tabloid stops cells from making DNA and RNA and may kill cancer cells. It is a type of antimetabolite. Also called thioguanine.
    More Information
    - Thioguanine (https://www.cancer.gov/about-cancer/treatment/drugs/thioguanine)
  Tabrecta: (ta-BREK-tah)
    Pronunciation of dictionary term "Tabrecta"
    A drug used to treat adults with non-small cell lung cancer that has spread and has a certain mutation (change) in the MET gene. It is also being studied in the treatment of other types of cancer. Tabrecta blocks a protein made by the MET gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called capmatinib hydrochloride.
    More Information
    - Capmatinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/capmatinibhydrochloride)
  TAC: An abbreviation for a chemotherapy combination used with other types of therapy to treat breast cancer. It includes the drugs docetaxel (Taxotere), doxorubicin hydrochloride (Adriamycin), and cyclophosphamide. Also called TAC regimen.
    More Information
    - TAC (https://www.cancer.gov/about-cancer/treatment/drugs/TAC)
  TAC regimen: (… REH-jih-men)
    Pronunciation of dictionary term "TAC regimen"
    An abbreviation for a chemotherapy combination used with other types of therapy to treat breast cancer. It includes the drugs docetaxel (Taxotere), doxorubicin hydrochloride (Adriamycin), and cyclophosphamide. Also called TAC.
    More Information
    - TAC (https://www.cancer.gov/about-cancer/treatment/drugs/TAC)
  TAC-101: A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called synthetic retinoids and angiogenesis inhibitors.
  TACE: A procedure in which the blood supply to a tumor is blocked after anticancer drugs are given in blood vessels near the tumor. Sometimes, the anticancer drugs are attached to small beads that are injected into an artery that feeds the tumor. The beads block blood flow to the tumor as they release the drug. This allows a higher amount of drug to reach the tumor for a longer period of time, which may kill more cancer cells. It also causes fewer side effects because very little of the drug reaches other parts of the body. TACE is used to treat liver cancer. Also called chemoembolization and transarterial chemoembolization.
  tachycardia: (TA-kih-KAR-dee-uh)
    Pronunciation of dictionary term "tachycardia"
    Rapid beating of the heart, usually defined as greater than 100 beats per minute.
  tachypnea: (TA-kip-NEE-uh)
    Pronunciation of dictionary term "tachypnea"
    Rapid breathing.
  tacrolimus: (tak-ROH-lih-mus)
    Pronunciation of dictionary term "tacrolimus"
    A drug used to help reduce the risk of rejection by the body of organ and bone marrow transplants.
  tadalafil: (tuh-DA-luh-fil)
    Pronunciation of dictionary term "tadalafil"
    A drug used to treat erectile dysfunction. It is also being studied in the treatment of sexual problems in patients treated with radiation or surgery for prostate cancer. Tadalafil blocks the action of a certain enzyme, which can result in increased blood flow to the penis, causing an erection. It is a type of cGMP phosphodiesterase type 5 (PDE5) inhibitor. Also called Cialis.
  TAE: A procedure in which the blood supply to a tumor or an abnormal area of tissue is blocked. During TAE, a small incision (cut) is made in the inner thigh and a catheter (thin, flexible tube) is inserted and guided into an artery near the tumor or abnormal tissue. Once the catheter is in place, small particles made of tiny gelatin sponges or beads are injected. This blocks the artery and stops the flow of blood to the tumor or abnormal area of tissue. TAE is used to treat some types of liver cancer, kidney cancer, and neuroendocrine tumors. It may also be used to treat uterine fibroids, aneurysms, and other conditions. Also called arterial embolization and transarterial embolization.
  tafasitamab: (TA-fuh-SIH-tuh-mab)
    Pronunciation of dictionary term "tafasitamab"
    A drug used with lenalidomide to treat adults with certain types of diffuse large B-cell lymphoma that relapsed (came back) or did not get better after treatment with other anticancer therapy. It is used in patients who cannot be treated with an autologous stem cell transplant. It is also being studied in the treatment of other types of cancer. Tafasitamab binds to a protein called CD19, which is found on most B cells (a type of white blood cell) and some lymphoma cells. This may help the immune system kill cancer cells. Tafasitamab is a type of monoclonal antibody. Also called Monjuvi.
    More Information
    - Tafasitamab-cxix (https://www.cancer.gov/about-cancer/treatment/drugs/tafasitamab-cxix)
  Tafinlar: (TA-fin-lar)
    Pronunciation of dictionary term "Tafinlar"
    A drug used alone or with trametinib to treat low-grade glioma (a type of brain tumor) in children aged 1 year and older and certain types of anaplastic thyroid cancer, non-small cell lung cancer, melanoma, and other solid tumors that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Tafinlar blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called dabrafenib mesylate.
    More Information
    - Dabrafenib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib)
  TAG-72 antigen: (... AN-tih-jen)
    Pronunciation of dictionary term "TAG-72 antigen"
    A protein/sugar complex found on the surface of many cancer cells, including breast, colon, and pancreatic cells.
  tagraxofusp: (tag-RAK-soh-fusp)
    Pronunciation of dictionary term "tagraxofusp"
    A drug used to treat adults and children aged 2 years and older with a rare blood cancer called blastic plasmacytoid dendritic cell neoplasm. It is also being studied in the treatment of other types of cancer. Tagraxofusp is made up of interleukin-3 (IL-3), which binds to an IL-3 receptor protein called CD123. CD123 may be found in higher than normal amounts on some types of cancer cells. Tagraxofusp is also made up of a diphtheria toxin, which may help kill cancer cells. Tagraxofusp is a type of cytotoxin. Also called Elzonris.
    More Information
    - Tagraxofusp-erzs (https://www.cancer.gov/about-cancer/treatment/drugs/tagraxofusp-erzs)
  Tagrisso: (tuh-GRIH-soh)
    Pronunciation of dictionary term "Tagrisso"
    A drug used alone or with other drugs to treat adults with certain types of non-small cell lung cancer that have an abnormal EGFR gene. It is also being studied in the treatment of other types of cancer. Tagrisso blocks certain proteins made by the mutated EGFR gene, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called osimertinib mesylate.
    More Information
    - Osimertinib Mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/osimertinib)
  tai chi: (ty chee)
    Pronunciation of dictionary term "tai chi"
    A form of traditional Chinese mind/body exercise and meditation that uses slow sets of body movements and controlled breathing. Tai chi is done to improve balance, flexibility, muscle strength, and overall health.
  tailbone: (TAYL-bone)
    Pronunciation of dictionary term "tailbone"
    The small bone at the bottom of the spine. It is made up of 3-5 fused bones. Also called coccyx.
  tailored intervention: (TAY-lurd IN-ter-VEN-shun)
    Pronunciation of dictionary term "tailored intervention"
    The use of communication, drugs, or other types of treatments that are specific for an individual or a group to improve health or change behavior.
  talabostat: (tal-A-boh-stat)
    Pronunciation of dictionary term "talabostat"
    A substance being studied in the treatment of cancer, including certain types of lung, pancreas, and brain cancer. Talabostat may help the immune system block the growth of cancer cells. It may also increase the growth of new blood cells. It is a type of enzyme inhibitor. Also called PT-100 and talabostat mesylate.
  talabostat mesylate: (tal-A-boh-stat MEH-zih-layt)
    Pronunciation of dictionary term "talabostat mesylate"
    A substance being studied in the treatment of cancer, including certain types of lung, pancreas, and brain cancer. Talabostat mesylate may help the immune system block the growth of cancer cells. It may also increase the growth of new blood cells. It is a type of enzyme inhibitor. Also called PT-100.
  talactoferrin: (tuh-LAK-toh-FAYR-in)
    Pronunciation of dictionary term "talactoferrin"
    A drug being studied in the treatment of kidney cancer that has spread. It is also being studied in the treatment of other types of cancer and other conditions. Talactoferrin increases the activity of dendritic cells (a type of immune cell) to help kill cancer cells. It is a form of human lactoferrin (a protein found in milk, tears, mucus, bile, and some white blood cells) that is made in the laboratory. Talactoferrin is a type of recombinant protein and a type of immunomodulatory protein. Also called talactoferrin alfa and TLF.
  talactoferrin alfa: (tuh-LAK-toh-FAYR-in AL-fuh)
    Pronunciation of dictionary term "talactoferrin alfa"
    A drug being studied in the treatment of kidney cancer that has spread. It is also being studied in the treatment of other types of cancer and other conditions. Talactoferrin alfa increases the activity of dendritic cells (a type of immune cell) to help kill cancer cells. It is a form of human lactoferrin (a protein found in milk, tears, mucus, bile, and some white blood cells) that is made in the laboratory. Talactoferrin alfa is a type of recombinant protein and a type of immunomodulatory protein. Also called talactoferrin and TLF.
  talampanel: (tuh-LAM-puh-nel)
    Pronunciation of dictionary term "talampanel"
    A substance that is being studied in the treatment of brain tumors and other brain disorders, such as epilepsy and Parkinson disease. It is a type of AMPA receptor antagonist.
  talaporfin sodium: (ta-luh-POR-fin SOH-dee-um)
    Pronunciation of dictionary term "talaporfin sodium"
    A drug used in photodynamic therapy. When absorbed by cancer cells and exposed to light, the drug becomes active and kills the cancer cells.
  talazoparib tosylate: (TA-luh-ZOH-puh-rib TOH-suh-layt)
    Pronunciation of dictionary term "talazoparib tosylate"
    A drug used alone to treat adults with HER2-negative breast cancer that has spread and has certain mutations (changes) in the BRCA1 or BRCA2 gene and with enzalutamide to treat adults with prostate cancer that has spread, has not responded to treatments that lower testosterone levels, and has a mutation in the HRR gene. It is also being studied in the treatment of other types of cancer. Talazoparib tosylate blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Talazoparib tosylate is a type of PARP inhibitor. Also called Talzenna.
    More Information
    - Talazoparib Tosylate (https://www.cancer.gov/about-cancer/treatment/drugs/talazoparibtosylate)
  talc: A mist or powdered form of the mineral magnesium silicate that is used to prevent malignant pleural effusions from coming back. Malignant pleural effusion is a condition in which cancer causes an abnormal collection of fluid in the space between the lung and chest wall. When talc is given through a tube inserted into the pleural space, it causes the space to close up so fluid cannot collect there. Talc is a type of sclerosing agent. Also called Sclerosol Intrapleural Aerosol, Sterile Talc Powder, and Steritalc.
    More Information
    - Talc (https://www.cancer.gov/about-cancer/treatment/drugs/talc)
  talimogene laherparepvec: (tah-LIH-moh-jeen lah-HER-pah-REP-vek)
    Pronunciation of dictionary term "talimogene laherparepvec"
    A drug used to treat melanoma that has recurred (come back) after surgery. It is used in patients whose cancer is in the skin and lymph nodes and cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Talimogene laherparepvec is made with a form of the herpesvirus that has been changed in the laboratory to infect and break down cancer cells without harming normal cells. It may also help the immune system kill cancer cells. Talimogene laherparepvec is injected directly into tumors in the skin and lymph nodes. It is a type of oncolytic virus therapy. Also called Imlygic and T-VEC.
    More Information
    - Talimogene Laherparepvec (https://www.cancer.gov/about-cancer/treatment/drugs/talimogenelaherparepvec)
  talk therapy: (...THAYR-uh-pee)
    Pronunciation of dictionary term "talk therapy"
    Treatment of mental, emotional, personality, and behavioral disorders using methods such as discussion, listening, and counseling. Also called psychotherapy.
  talotrexin: (ta-loh-TREK-sin)
    Pronunciation of dictionary term "talotrexin"
    A substance that is being studied in the treatment of leukemia and some other types of cancer. It belongs to the family of drugs called antifolates.
  talquetamab: (tal-KWEH-tah-mab)
    Pronunciation of dictionary term "talquetamab"
    A drug used to treat adults with multiple myeloma that came back or did not get better after treatment with at least four other anticancer therapies. These therapies had to include an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Talquetamab binds to a protein called CD3, which is found on T cells (a type of white blood cell), and to a protein called GPRC5D, which is found on myeloma cells and some other types of cells. This may help the immune system kill cancer cells. Talquetamab is a type of bispecific T-cell engager. Also called Talvay.
    More Information
    - Talquetamab-tgvs (https://www.cancer.gov/about-cancer/treatment/drugs/talquetamab-tgvs)
  Talvay: (TAL-vay)
    Pronunciation of dictionary term "Talvay"
    A drug used to treat adults with multiple myeloma that came back or did not get better after treatment with at least four other anticancer therapies. These therapies had to include an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Talvay binds to a protein called CD3, which is found on T cells (a type of white blood cell), and to a protein called GPRC5D, which is found on myeloma cells and some other types of cells. This may help the immune system kill cancer cells. Talvay is a type of bispecific T-cell engager. Also called talquetamab.
    More Information
    - Talquetamab-tgvs (https://www.cancer.gov/about-cancer/treatment/drugs/talquetamab-tgvs)
  Talzenna: (tal-ZEH-nuh)
    Pronunciation of dictionary term "Talzenna"
    A drug used alone to treat adults with HER2-negative breast cancer that has spread and has certain mutations (changes) in the BRCA1 or BRCA2 gene and with enzalutamide to treat adults with prostate cancer that has spread, has not responded to treatments that lower testosterone levels, and has a mutation in the HRR gene. It is also being studied in the treatment of other types of cancer. Talzenna blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Talzenna is a type of PARP inhibitor. Also called talazoparib tosylate.
    More Information
    - Talazoparib Tosylate (https://www.cancer.gov/about-cancer/treatment/drugs/talazoparibtosylate)
  TAM: A bone marrow disorder that can occur in newborns who have Down syndrome. It is marked by abnormal, immature blood-forming cells in the blood and bone marrow (especially the cells involved in making platelets). The liver may also be larger than normal. TAM is caused by mutations (changes) in a gene called GATA1. TAM usually goes away on its own within the first 3 months of life. Sometimes TAM causes severe or life-threatening problems, such as bleeding problems, infection, heart, kidney, and liver failure, and abnormal build-up of fluid in the tissues that cover the organs in the body. Infants who have TAM have an increased risk of developing acute myeloid leukemia (AML) before the age of 3 years. Also called TMD, transient abnormal myelopoiesis, transient leukemia, and transient myeloproliferative disorder.
  Tamiflu: (TA-mih-floo)
    Pronunciation of dictionary term "Tamiflu"
    A drug used to prevent and to treat influenza virus infections. It blocks the release of the virus from infected cells. It is a type of antiviral agent. Also called oseltamivir phosphate.
  tamoxifen: (tuh-MOK-sih-FEN)
    Pronunciation of dictionary term "tamoxifen"
    A drug used to treat certain types of breast cancer in women and men. It is also used to prevent breast cancer in women who have had ductal carcinoma in situ (abnormal cells in the ducts of the breast) and in women who are at a high risk of developing breast cancer. Tamoxifen is also being studied in the treatment of other types of cancer. It blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. Tamoxifen is a type of selective estrogen receptor modulator (SERM). Also called tamoxifen citrate.
    More Information
    - Tamoxifen Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/tamoxifencitrate)
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  tamoxifen citrate: (tuh-MOK-sih-FEN SIH-trayt)
    Pronunciation of dictionary term "tamoxifen citrate"
    A drug used to treat certain types of breast cancer in women and men, to prevent invasive breast cancer in women who have had ductal carcinoma in situ (abnormal cells in the ducts of the breast), and to prevent breast cancer in women who are at a high risk of developing the disease. It is also being studied in the treatment of other types of cancer. Tamoxifen citrate blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. It is a type of selective estrogen receptor modulator (SERM). Tamoxifen is the active ingredient of tamoxifen citrate. Also called Soltamox.
    More Information
    - Tamoxifen Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/tamoxifencitrate)
    - Surgery to Reduce the Risk of Breast Cancer (https://www.cancer.gov/types/breast/risk-reducing-surgery-fact-sheet)
    - Hormone Therapy for Breast Cancer (https://www.cancer.gov/types/breast/breast-hormone-therapy-fact-sheet)
  tamsulosin: (tam-SOO-loh-sin)
    Pronunciation of dictionary term "tamsulosin"
    A drug used to treat urinary problems caused by an enlarged prostate. Tamsulosin relaxes the muscles of the prostate and bladder, which helps the flow of urine. It is a type of alpha blocker. Also called Flomax and tamsulosin hydrochloride.
  tamsulosin hydrochloride: (tam-SOO-loh-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "tamsulosin hydrochloride"
    A drug used to treat urinary problems caused by an enlarged prostate. Tamsulosin hydrochloride relaxes the muscles of the prostate and bladder, which helps the flow of urine. It is a type of alpha blocker. Also called Flomax.
  tandem transplant: (TAN-dem TRANZ-plant)
    Pronunciation of dictionary term "tandem transplant"
    A type of transplant in which a patient receives two courses of high-dose chemotherapy, each course followed by an infusion of their own healthy blood-forming stem cells. The stem cells are collected and stored before the first high-dose chemotherapy treatment. The treatments are given weeks or months apart but are usually completed within a 6-month period. A tandem transplant is used to treat certain types of cancer, such as neuroblastoma and multiple myeloma. Also called double autologous transplant.
    More Information
    - Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
  tandutinib: (tan-DOO-tih-nib)
    Pronunciation of dictionary term "tandutinib"
    A substance being studied in the treatment of some types of cancer. It may stop cancer cell growth by blocking certain enzymes. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called CT53518 and MLN518.
  tanespimycin: (ta-NEH-spih-MY-sin)
    Pronunciation of dictionary term "tanespimycin"
    A substance being studied in the treatment of cancer. It is made from an antibiotic called geldanamycin. Tanespimycin helps cause the breakdown of certain proteins in the cell, and may kill cancer cells. It is a type of antineoplastic antibiotic and a type of HSP90 inhibitor. Also called 17-AAG and 17-N-allylamino-17-demethoxygeldanamycin.
  tannic acid: (TA-nik A-sid)
    Pronunciation of dictionary term "tannic acid"
    A type of chemical found in plants and in certain foods, such as fruits, vegetables, nuts, wine, and tea. Tannic acid has antioxidant properties and may promote good health. It is being studied in the prevention of cancer, heart disease, and other diseases. It is also used in certain medicines, fabrics, leather, and ink. Tannic acid is a type of polyphenol. Also called tannin.
  tannin: (TA-nin)
    Pronunciation of dictionary term "tannin"
    A type of chemical found in plants and in certain foods, such as fruits, vegetables, nuts, wine, and tea. Tannins have antioxidant properties and may promote good health. They are being studied in the prevention of cancer, heart disease, and other diseases. They are also used in certain medicines, fabrics, leather, and ink. A tannin is a type of polyphenol. Also called tannic acid.
  tapentadol hydrochloride: (tuh-PEN-tuh-dol HY-droh-KLOR-ide)
    Pronunciation of dictionary term "tapentadol hydrochloride"
    A drug used to treat moderate to severe pain. It binds to opioid receptors and other molecules in the central nervous system. Tapentadol hydrochloride is a type of opioid and a type of analgesic agent. Also called Nucynta.
  Tarceva: (tar-SEE-vuh)
    Pronunciation of dictionary term "Tarceva"
    A drug used alone to treat certain types of non-small cell lung cancer and with gemcitabine hydrochloride to treat certain types of pancreatic cancer. It is also being studied in the treatment of other types of cancer. Tarceva blocks a protein called EGFR, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called CP-358,774, erlotinib hydrochloride, and OSI-774.
    More Information
    - Erlotinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/erlotinibhydrochloride)
  targeted radionuclide therapy: (TAR-geh-ted RAY-dee-oh-NOO-klide THAYR-uh-pee)
    Pronunciation of dictionary term "targeted radionuclide therapy"
    A type of radiation therapy in which a radionuclide (a radioactive chemical) is linked to a cell-targeting molecule, such as a monoclonal antibody, and injected into the body. The cell-targeting molecule binds to a specific target found on some cancer cells. This may help kill the targeted cancer cells while limiting the harm to normal cells. Targeted radionuclide therapy is used to treat prostate cancer and some other types of cancer. Also called molecular radiation therapy.
  targeted therapy: (TAR-geh-ted THAYR-uh-pee)
    Pronunciation of dictionary term "targeted therapy"
    A type of treatment that uses drugs or other substances to target specific molecules that cancer cells need to survive and spread. Targeted therapies work in different ways to treat cancer. Some stop cancer cells from growing by interrupting signals that cause them to grow and divide, stopping signals that help form blood vessels, delivering cell-killing substances to cancer cells, or starving cancer cells of hormones they need to grow. Other targeted therapies help the immune system kill cancer cells or directly cause cancer cell death. Most targeted therapies are either small-molecule drugs or monoclonal antibodies. Also called molecularly targeted therapy.
    More Information
    - Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
  Targretin: (tar-GREH-tin)
    Pronunciation of dictionary term "Targretin"
    A drug used to treat skin problems caused by cutaneous T-cell lymphoma that did not get better after other treatment. It is also being studied in the treatment of other types of cancer. Targretin binds to and activates proteins called retinoid X receptors, which may stop the growth of cancer cells and kill them. It is a type of retinoid. Also called bexarotene and LGD1069.
    More Information
    - Bexarotene (https://www.cancer.gov/about-cancer/treatment/drugs/bexarotene)
  tariquidar: (tar-IH-kwih-dar)
    Pronunciation of dictionary term "tariquidar"
    A substance that is being studied in the treatment of cancer. It may help tumor cells respond again to drugs they have become resistant (unable to respond) to. Tariquidar is a type of multidrug resistance inhibitor and a type of P-glycoprotein antagonist. Also called XR9576.
  tarlatamab: (tar-LA-tah-mab)
    Pronunciation of dictionary term "tarlatamab"
    A drug used to treat adults with extensive-stage small cell lung cancer that got worse during or after treatment with platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Tarlatamab binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called DLL3, which is found on some types of cancer cells. This may help the immune system kill cancer cells. Tarlatamab is a type of bispecific T-cell engager. Also called Imdelltra.
    More Information
    - Tarlatamab-dlle (https://www.cancer.gov/about-cancer/treatment/drugs/tarlatamab-dlle)
  Tarvacin: (TAR-vuh-sin)
    Pronunciation of dictionary term "Tarvacin"
    A substance being studied in the treatment of several types of cancer and infections caused by certain viruses. It binds to substances on the surface of tumor cells, certain viruses, and cells infected with a virus. The immune system detects Tarvacin on the cells and the viruses and may destroy them. It is a type of monoclonal antibody and a type of targeted therapy agent. Also called bavituximab.
  Tasigna: (tuh-SIG-nuh)
    Pronunciation of dictionary term "Tasigna"
    A drug used to treat certain types of chronic myelogenous leukemia that are Philadelphia chromosome positive. It is also being studied in the treatment of other types of cancer. Tasigna blocks BCR::ABL1 and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called nilotinib.
    More Information
    - Nilotinib (https://www.cancer.gov/about-cancer/treatment/drugs/nilotinib)
  taurolidine: (TAW-roh-LIH-deen)
    Pronunciation of dictionary term "taurolidine"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called anti-infectives.
  Tavalisse: (TA-vah-lees)
    Pronunciation of dictionary term "Tavalisse"
    A drug used to treat thrombocytopenia (a low blood platelet count) in adults with chronic immune thrombocytopenia (ITP) that did not get better with other treatment. ITP is a condition in which platelets are destroyed by the immune system. Tavalisse is also being studied in the treatment of other conditions and types of cancer. It blocks an enzyme called Syk, which may help keep the immune system from destroying platelets. Tavalisse is a type of tyrosine kinase inhibitor. Also called fostamatinib disodium, R788 sodium, and Syk kinase inhibitor R-935788.
  taxane: (TAK-sayn)
    Pronunciation of dictionary term "taxane"
    A type of drug that blocks cell growth by stopping mitosis (cell division). Taxanes interfere with microtubules (cellular structures that help move chromosomes during mitosis). They are used to treat cancer. A taxane is a type of mitotic inhibitor and a type of antimicrotubule agent.
  taxoid XRP6258: (TAK-zoyd …)
    Pronunciation of dictionary term "taxoid XRP6258"
    A drug used with prednisone to treat prostate cancer that has spread to other parts of the body and is castration resistant (has not responded to treatments that lower testosterone levels). It is used in patients who have already been treated with anticancer drugs that included docetaxel. It is also being studied in the treatment of other types of cancer. Taxoid XRP6258 stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called cabazitaxel and Jevtana.
    More Information
    - Cabazitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/cabazitaxel)
  Taxol: (TAK-sol)
    Pronunciation of dictionary term "Taxol"
    A drug used to treat AIDS-related Kaposi sarcoma, advanced ovarian cancer, and certain types of breast cancer. It is also used with cisplatin to treat non-small cell lung cancer in patients who cannot be treated with surgery or radiation therapy. It is also being studied in the treatment of other types of cancer. Taxol blocks cell growth by stopping cell division and may kill cancer cells. It is a type of antimitotic agent. Also called paclitaxel.
    More Information
    - Paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel)
  Taxotere: (TAK-soh-teer)
    Pronunciation of dictionary term "Taxotere"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, gastroesophageal junction cancer, non-small cell lung cancer, prostate cancer, and squamous cell carcinoma of the head and neck. It is also being studied in the treatment of other types of cancer. Taxotere stops cancer cells from growing and dividing and may kill them. It is a type of taxane. Also called docetaxel.
    More Information
    - Docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel)
  Taxotere-Platinol-fluorouracil: (TAK-soh-teer-PLA-tih-nol-floor-oh-YOOR-uh-sil)
    Pronunciation of dictionary term "Taxotere-Platinol-fluorouracil"
    A chemotherapy combination used to treat certain types of head and neck cancer and stomach cancer. It includes the drugs docetaxel (Taxotere), cisplatin (Platinol), and fluorouracil. Also called DCF, docetaxel-cisplatin-fluorouracil, TPF, and TPF regimen.
    More Information
    - TPF (https://www.cancer.gov/about-cancer/treatment/drugs/TPF)
  tazarotene: (ta-ZAR-oh-teen)
    Pronunciation of dictionary term "tazarotene"
    A drug used on the skin to treat several skin conditions. It is also being studied in the treatment of basal cell skin cancer and basal cell nevus syndrome. Tazarotene is related to vitamin A and is made in the laboratory. It turns on a gene that may help stop the growth of skin cancer cells. Tazarotene is a type of synthetic retinoid. Also called Avage and Tazorac.
  tazemetostat hydrobromide: (TA-zeh-MEH-toh-stat HY-droh-BROH-mide)
    Pronunciation of dictionary term "tazemetostat hydrobromide"
    A drug used to treat adults and children aged 16 years and older with a rare type of soft tissue sarcoma called epithelioid sarcoma and adults with certain types of follicular lymphoma. It is also being studied in the treatment of other types of cancer. Tazemetostat hydrobromide blocks certain enzymes involved in gene expression and cell division. Blocking these enzymes may help keep cancer cells from growing. Tazemetostat hydrobromide is a type of histone methyltransferase inhibitor. Also called Tazverik.
    More Information
    - Tazemetostat Hydrobromide (https://www.cancer.gov/about-cancer/treatment/drugs/tazemetostathydrobromide)
  Tazorac: (TAZ-oh-rak)
    Pronunciation of dictionary term "Tazorac"
    A drug used on the skin to treat several skin conditions. It is also being studied in the treatment of basal cell skin cancer and basal cell nevus syndrome. Tazorac is related to vitamin A and is made in the laboratory. It turns on a gene that may help stop the growth of skin cancer cells. Tazorac is a type of synthetic retinoid. Also called Avage and tazarotene.
  Tazverik: (taz-VAYR-ik)
    Pronunciation of dictionary term "Tazverik"
    A drug used to treat adults and children aged 16 years and older with a rare type of soft tissue sarcoma called epithelioid sarcoma and adults with certain types of follicular lymphoma. It is also being studied in the treatment of other types of cancer. Tazverik blocks certain enzymes involved in gene expression and cell division. Blocking these enzymes may help keep cancer cells from growing. Tazverik is a type of histone methyltransferase inhibitor. Also called tazemetostat hydrobromide.
    More Information
    - Tazemetostat Hydrobromide (https://www.cancer.gov/about-cancer/treatment/drugs/tazemetostathydrobromide)
  TB: A disease caused by a specific type of bacteria that spreads from one person to another through the air. TB can affect many parts of the body, but most often affects the lungs. A person may not have symptoms of TB for years, but they may appear when the patient becomes ill with a serious condition like diabetes, AIDS, or cancer. TB can usually be treated and cured with antibiotics. Also called tuberculosis.
  TBI: A type of radiation therapy that is given to the entire body. TBI is often used with high-dose anticancer drugs to help prepare a patient for a stem cell transplant. It is done to kill any cancer cells that are left in the body and helps make room in the patient’s bone marrow for new blood stem cells to grow. TBI may also help prevent the body’s immune system from rejecting the transplanted stem cells. Also called total-body irradiation.
  Tc 99m sulfur colloid: (… SUL-fur KAH-loyd)
    Pronunciation of dictionary term "Tc 99m sulfur colloid"
    A substance being studied as a way to find cancer in the body. It is also used to find sentinel lymph nodes in breast cancer. It contains a radioactive substance called technetium linked to a substance called sulfur colloid. Sulfer colloid is taken up by special cells in lymph tissue, and in the liver, spleen, and bone marrow after it is injected. A machine or probe that detects radioactivity is used to find where the Tc 99m sulfur colloid is in the body. Also called Tc-99m SC and technetium Tc 99m-sulfur colloid.
  Tc-99m Dextran: (... DEK-stran)
    Pronunciation of dictionary term "Tc-99m Dextran"
    A substance being studied as a way to find sentinel lymph nodes in some types of skin cancer and breast cancer. It contains a radioactive substance called technetium linked to a substance called dextran. Dextran helps technetium stay in blood and lymph vessels after it is injected. A machine or probe that detects radioactivity shows which lymph nodes near the tumor have Tc-99m Dextran in them. Also called 99m-Tc-Dx and technetium Tc 99m-dextran.
  Tc-99m SC: A substance being studied as a way to find cancer in the body. It is also used to find sentinel lymph nodes in breast cancer. It contains a radioactive substance called technetium linked to a substance called sulfur colloid. Sulfer colloid is taken up by special cells in lymph tissue, and in the liver, spleen, and bone marrow after it is injected. A machine or probe that detects radioactivity is used to find where the Tc-99m SC is in the body. Also called Tc 99m sulfur colloid and technetium Tc 99m-sulfur colloid.
  TCE: A device used to look at tissues in the esophagus. It is a tiny capsule with a laser scanner inside and a very thin cord attached to it. The patient swallows the capsule and the thin cord helps keep the capsule in a specific area in the esophagus. The cord is also used to remove the capsule. Pictures are taken by the laser scanner and sent to a computer for viewing. A TCE is used to find early cancers of the esophagus and other parts of the body. Also called tethered capsule endoscope.
  TCGA: A project to identify the complete set of DNA changes in many different types of cancer. Studying these changes may help researchers understand how different types of cancer form. This may lead to new ways to prevent, diagnose, and treat cancer. TCGA is led by the National Cancer Institute (NCI) and the National Human Genome Research Institute (NHGRI), which are parts of the National Institutes of Health (NIH). Also called The Cancer Genome Atlas.
  TCM: A medical system that has been used for thousands of years to prevent, diagnose, and treat disease. It is based on the belief that qi (the body's vital energy) flows along meridians (channels) in the body and keeps a person’s spiritual, emotional, mental, and physical health in balance. TCM aims to restore the body’s balance and harmony between the natural opposing forces of yin and yang, which can block qi and cause disease. TCM includes acupuncture, diet, herbal therapy, meditation, physical exercise, and massage. Also called Oriental medicine and Traditional Chinese Medicine.
  TCR: A group of proteins found on T cells (a type of immune cell that recognizes and binds to foreign substances). TCRs bind to certain antigens (proteins) found on abnormal cells, cancer cells, cells from other organisms, and cells infected with a virus or another microorganism. This interaction causes the T cells to attack these cells and helps the body fight infection, cancer, or other diseases. Also called T-cell receptor.
  TDR: A way of describing how family members are related to each other when there are two other family members in the blood line between them. Examples of a TDR are a first cousin, great-grandparent, great-aunt, great-uncle, great-niece, great-nephew, great-grandchild, half-aunt, or half-uncle. Also called third-degree relative.
  tea tree: (tee tree)
    Pronunciation of dictionary term "tea tree"
    A tree that is a member of the myrtle family. Oil from the tea tree is used in shampoos and skin care products and to treat skin infections. It has been used in some cultures to treat other skin conditions, including acne, burns, and insect bites. The scientific name is Melaleuca alternifolia.
  tebentafusp: (teh-BEN-tah-fusp)
    Pronunciation of dictionary term "tebentafusp"
    A drug used to treat adults with uveal melanoma (a type of eye cancer) that has spread or cannot be removed by surgery. It is used in patients who have the HLA-A*02:01 antigen. It is also being studied in the treatment of other types of cancer. Tebentafusp binds to certain antigens found on the surfaces of uveal melanoma cells and T cells (a type of immune cell). This may help the immune system kill cancer cells. Tebentafusp is a type of bispecific fusion protein. Also called Kimmtrak.
    More Information
    - Tebentafusp-tebn (https://www.cancer.gov/about-cancer/treatment/drugs/tebentafusp-tebn)
  Tecartus: (teh-KAR-tus)
    Pronunciation of dictionary term "Tecartus"
    A drug used to treat adults with mantle cell lymphoma or B-cell acute lymphoblastic leukemia that came back or did not get better after other treatment. It is also being studied in the treatment of other types of cancer. Tecartus is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Tecartus binds to a protein called CD19, which is found on some lymphoma cells and leukemia cells. This helps the body’s immune system kill cancer cells. Tecartus is a type of CAR T-cell therapy. Also called brexucabtagene autoleucel.
    More Information
    - Brexucabtagene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/brexucabtageneautoleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  Tecelra: (teh-SEL-ruh)
    Pronunciation of dictionary term "Tecelra"
    A treatment used for adults with synovial sarcoma that has the MAGE-A4 antigen and has spread to other parts of the body or cannot be removed by surgery. It is used in patients who have certain HLA-A*02 antigens and have received chemotherapy. It is also being studied in the treatment of other types of cancer. Tecelra is made using a patient’s T cells (a type of immune system cell). A special T-cell receptor that can recognize the MAGE-A4 antigen is added to the T cells in the laboratory. These changed T cells are then grown in large numbers in the laboratory and given back to the patient by infusion. Tecelra binds to the MAGE-A4 antigen, which is found on some types of cancer cells. This helps the body’s immune system kill cancer cells. Tecelra is a type of cellular immunotherapy. Also called afamitresgene autoleucel.
    More Information
    - Afamitresgene Autoleucel (https://www.cancer.gov/about-cancer/treatment/drugs/afamitresgene-autoleucel)
  Tecentriq: (teh-SEN-trik)
    Pronunciation of dictionary term "Tecentriq"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer, including cancers that express PD-L1. Tecentriq is used alone or with other drugs to treat adults with certain types of hepatocellular carcinoma (a type of liver cancer), melanoma, non-small cell lung cancer, or small cell lung cancer. It is also used alone to treat adults and children aged 2 years and older with alveolar soft part sarcoma that has spread to other parts of the body or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Tecentriq may block PD-L1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called atezolizumab.
    More Information
    - Atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab)
  Tecentriq Hybreza: (teh-SEN-trik hy-BREE-zuh)
    Pronunciation of dictionary term "Tecentriq Hybreza"
    A combination of two drugs used alone or with other drugs to treat adults with certain types of alveolar soft part sarcoma (a type of soft tissue tumor), hepatocellular carcinoma (a type of liver cancer), melanoma, non-small cell lung cancer, and small cell lung cancer. Atezolizumab binds to a protein called PD-L1, which is found on some normal cells and some types of cancer cells. Atezolizumab may block PD-L1 and help the immune system kill cancer cells. Hyaluronidase allows atezolizumab to be given by injection under the skin. Tecentriq Hybreza can be given in less time than atezolizumab alone, which is given as an infusion. Also called atezolizumab and hyaluronidase.
    More Information
    - Atezolizumab and Hyaluronidase-tqjs (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab-and-hyaluronidase-tqjs)
  technetium Tc 99m-demobesin-4: (tek-NEE-shee-um … deh-MAH-beh-sin …)
    Pronunciation of dictionary term "technetium Tc 99m demobesin-4"
    A substance being studied as a way to find certain types of cancer in the body. It contains a radioactive substance called technetium linked to a substance called demobesin. Demobesin binds to the receptor for bombesin (a substance that is found at higher-than-normal levels on some types of cancer cells). Technetium Tc 99m-demobesin-4 collects in cancer cells and a machine is used to find where the cancer cells are in the body.
  technetium Tc 99m-dextran: (tek-NEE-shee-um ... DEK-stran)
    Pronunciation of dictionary term "technetium Tc 99m dextran"
    A substance being studied as a way to find sentinel lymph nodes in some types of skin cancer and breast cancer. It contains a radioactive substance called technetium linked to a substance called dextran. Dextran helps technetium stay in blood and lymph vessels after it is injected. A machine or probe that detects radioactivity shows which lymph nodes near the tumor have technetium Tc 99m-dextran in them. Also called 99m-Tc-Dx and Tc-99m Dextran.
  technetium Tc 99m-sulfur colloid: (tek-NEE-shee-um ... SUL-fur KAH-loyd)
    Pronunciation of dictionary term "technetium Tc 99m sulfur colloid"
    A substance being studied as a way to find cancer in the body. It is also used to find sentinel lymph nodes in breast cancer. It contains a radioactive substance called technetium linked to a substance called sulfur colloid. Sulfer colloid is taken up by special cells in lymph tissue, and in the liver, spleen, and bone marrow after it is injected. A machine or probe that detects radioactivity is used to find where the technetium Tc 99m-sulfur colloid is in the body. Also called Tc 99m sulfur colloid and Tc-99m SC.
  technician: (tek-NIH-shun)
    Pronunciation of dictionary term "technician"
    A person trained in the techniques (methods) and skills of a profession. For example, a mammogram technician is trained to perform mammograms.
  teclistamab: (tek-LIS-tuh-mab)
    Pronunciation of dictionary term "teclistamab"
    A drug used to treat adults with multiple myeloma that came back or did not get better after treatment with at least four other anticancer therapies, including an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Teclistamab binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called BCMA, which is found on myeloma cells and some B cells (another type of white blood cell). This may help the immune system kill cancer cells. Teclistamab is a type of bispecific monoclonal antibody. Also called Tecvayli.
    More Information
    - Teclistamab-cqyv (https://www.cancer.gov/about-cancer/treatment/drugs/teclistamab-cqyv)
  Tecvayli: (tek-VAY-lee)
    Pronunciation of dictionary term "Tecvayli"
    A drug used to treat adults with multiple myeloma that came back or did not get better after treatment with at least four other anticancer therapies, including an immunomodulating agent, a proteasome inhibitor, and an anti-CD38 monoclonal antibody. Tecvayli binds to a protein called CD3, which is found on T cells (a type of white blood cell). It also binds to a protein called BCMA, which is found on myeloma cells and some B cells (another type of white blood cell). This may help the immune system kill cancer cells. Tecvayli is a type of bispecific monoclonal antibody. Also called teclistamab.
    More Information
    - Teclistamab-cqyv (https://www.cancer.gov/about-cancer/treatment/drugs/teclistamab-cqyv)
  tegafur: (TEH-guh-fer)
    Pronunciation of dictionary term "tegafur"
    An anticancer drug that belongs to the family of drugs called antimetabolites.
  tegafur-uracil: (TEH-guh-fer-YOOR-uh-sil)
    Pronunciation of dictionary term "tegafur-uracil"
    A substance being studied in the treatment of some types of cancer. It is a combination of tegafur and uracil. The tegafur is taken up by the cancer cells and breaks down into 5-FU, a substance that kills tumor cells. The uracil causes higher amounts of 5-FU to stay inside the cells and kill them. Tegafur-uracil is a type of antimetabolite. Also called Ftorafur and UFT.
  teicoplanin: (ty-koh-PLAY-nin)
    Pronunciation of dictionary term "teicoplanin"
    A substance used to treat bacterial infections. It belongs to the family of drugs called antibiotics.
  telangiectasia: (teh-LAN-jee-ek-TAY-zhuh)
    Pronunciation of dictionary term "telangiectasia"
    The permanent enlargement of blood vessels, causing redness in the skin or mucous membranes.
  Telcyta: (tel-SY-tuh)
    Pronunciation of dictionary term "Telcyta"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called glutathione analogs. Also called TLK286.
  telehealth: (TEH-leh-helth)
    Pronunciation of dictionary term "telehealth"
    The delivery of health care from a distance using electronic information and technology, such as computers, cameras, videoconferencing, satellites, wireless communications, and the internet. Also called telemedicine.
  telemedicine: (TEH-leh-MEH-dih-sin)
    Pronunciation of dictionary term "telemedicine"
    The delivery of health care from a distance using electronic information and technology, such as computers, cameras, videoconferencing, satellites, wireless communications, and the internet. Also called telehealth.
  telomerase: (teh-LOH-meh-rays)
    Pronunciation of dictionary term "telomerase"
    An enzyme in cells that helps keep them alive by adding DNA to telomeres (the ends of chromosomes). Each time a cell divides, the telomeres lose a small amount of DNA and become shorter. Over time, the chromosomes become damaged and the cells die. Telomerase helps keep this from happening. Cancer cells usually have more telomerase than most normal cells.
  telomere: (TEH-loh-meer)
    Pronunciation of dictionary term "telomere"
    The ends of a chromosome. Each time a cell divides, the telomeres lose a small amount of DNA and become shorter. Over time, the chromosomes become damaged and the cells die. In cancer cells the telomeres do not get shorter, and may become longer, as the cells divide.
  Temodar: (TEH-moh-dar)
    Pronunciation of dictionary term "Temodar"
    A drug used alone or with radiation therapy to treat adults with glioblastoma or anaplastic astrocytoma (types of brain tumors). It is used in patients whose cancer is newly diagnosed or did not get better with other treatment. It is also being studied in the treatment of other types of cancer. Temodar damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called temozolomide.
    More Information
    - Temozolomide (https://www.cancer.gov/about-cancer/treatment/drugs/temozolomide)
  temoporfin: (teh-moh-POR-fin)
    Pronunciation of dictionary term "temoporfin"
    An anticancer drug that is also used in cancer prevention. It belongs to the family of drugs called photosensitizing agents.
  temozolomide: (teh-moh-ZOH-loh-mide)
    Pronunciation of dictionary term "temozolomide"
    A drug used alone or with radiation therapy to treat adults with glioblastoma or anaplastic astrocytoma (types of brain tumors). It is used in patients whose cancer is newly diagnosed or did not get better with other treatment. It is also being studied in the treatment of other types of cancer. Temozolomide damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Temodar.
    More Information
    - Temozolomide (https://www.cancer.gov/about-cancer/treatment/drugs/temozolomide)
  temsirolimus: (TEM-sih-ROH-lih-mus)
    Pronunciation of dictionary term "temsirolimus"
    A drug used to treat advanced renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. Temsirolimus blocks a protein called mTOR, which helps control cell division. Blocking this protein may help keep cancer cells from growing. Temsirolimus is a type of kinase inhibitor. Also called CCI-779 and Torisel.
    More Information
    - Temsirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/temsirolimus)
  tendon: (TEN-dun)
    Pronunciation of dictionary term "tendon"
    Tough, fibrous, cord-like tissue that connects muscle to bone or another structure, such as an eyeball. Tendons help the bone or structure to move.
  teniposide: (teh-nih-POH-side)
    Pronunciation of dictionary term "teniposide"
    An anticancer drug that is a podophyllotoxin derivative and belongs to the family of drugs called mitotic inhibitors.
  tenosynovial giant cell tumor: (TEH-noh-sih-NOH-vee-ul JY-unt sel TOO-mer)
    Pronunciation of dictionary term "tenosynovial giant cell tumor"
    A type of rare tumor that forms in the synovium (tissue that lines the joints), the tendon sheath (tissue that covers the tendons), or the bursa (a fluid-filled sac between bones, tendons, and muscles). These tumors cause the affected synovium, tendon sheath, or bursa to thicken and overgrow. Tenosynovial giant cell tumors can occur in any joint. Although tenosynovial giant cell tumors are not cancer, they can grow and cause damage to surrounding tissues or structures. Symptoms may include reduced movement or pain in the affected joint and a locking or catching sensation when moving the joint. Tenosynovial giant cell tumors usually occur in young and middle-aged adults. Also called TGCT.
  TENS: A procedure in which mild electric currents are applied to some areas of the skin. Also called transcutaneous electrical nerve stimulation.
  Tepadina: (teh-pah-DEE-nuh)
    Pronunciation of dictionary term "Tepadina"
    A drug used to treat certain types of bladder cancer, breast cancer, ovarian cancer, and malignant effusion (a condition in which cancer causes an abnormal amount of fluid to collect in hollow spaces or between tissues of the body). It is also being studied in the treatment of other types of cancer. Tepadina damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called thiotepa.
    More Information
    - Thiotepa (https://www.cancer.gov/about-cancer/treatment/drugs/thiotepa)
  Tepmetko: (tep-MET-koh)
    Pronunciation of dictionary term "Tepmetko"
    A drug used to treat adults with non-small cell lung cancer that has spread to other parts of the body and has a certain mutation (change) in the MET gene. It is also being studied in the treatment of other types of cancer. Tepmetko blocks a protein made by the MET gene, which may help keep cancer cells from growing and spreading and may kill them. It is a type of tyrosine kinase inhibitor. Also called tepotinib hydrochloride.
    More Information
    - Tepotinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/tepotinibhydrochloride)
  tepotinib hydrochloride: (teh-POH-tih-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "tepotinib hydrochloride"
    A drug used to treat adults with non-small cell lung cancer that has spread to other parts of the body and has a certain mutation (change) in the MET gene. It is also being studied in the treatment of other types of cancer. Tepotinib hydrochloride blocks a protein made by the MET gene, which may help keep cancer cells from growing and spreading and may kill them. It is a type of tyrosine kinase inhibitor. Also called Tepmetko.
    More Information
    - Tepotinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/tepotinibhydrochloride)
  teratocarcinoma: (TAYR-uh-toh-KAR-sih-NOH-muh)
    Pronunciation of dictionary term "teratocarcinoma"
    A type of germ cell cancer that usually forms in the testes (testicles).
  teratoma: (TAYR-uh-TOH-muh)
    Pronunciation of dictionary term "teratoma"
    A type of germ cell tumor that may contain several different types of tissue, such as hair, muscle, and bone. Teratomas may be mature or immature, based on how normal the cells look under a microscope. Sometimes teratomas are a mix of mature and immature cells. Teratomas usually occur in the ovaries in women, the testicles in men, and the tailbone in children. They may also occur in the central nervous system (brain and spinal cord), chest, or abdomen. Teratomas may be benign (not cancer) or malignant (cancer).
    More Information
    - Childhood Extracranial Germ Cell Tumors Treatment
    - Childhood Central Nervous System Germ Cell Tumors Treatment
  terazosin: (ter-AY-zoh-sin)
    Pronunciation of dictionary term "terazosin"
    A drug used to treat urinary problems caused by an enlarged prostate. It is also used to treat high blood pressure and is being studied in the treatment of other conditions. Terazosin relaxes muscle tissue in blood vessels and in the prostate. It is a type of alpha blocker. Also called Hytrin and terazosin hydrochloride.
  terazosin hydrochloride: (ter-AY-zoh-sin HY-droh-KLOR-ide)
    Pronunciation of dictionary term "terazosin hydrochloride"
    A drug used to treat urinary problems caused by an enlarged prostate. It is also used to treat high blood pressure and is being studied in the treatment of other conditions. Terazosin hydrochloride relaxes muscle tissue in blood vessels and in the prostate. It is a type of alpha blocker. Also called Hytrin.
  TERC gene: (... jeen)
    Pronunciation of dictionary term "TERC gene"
    A gene that makes a protein involved in maintaining telomeres (the ends of chromosomes) and in repairing chromosomes. Mutations (changes) in the TERC gene have been found in a rare, inherited condition called dyskeratosis congenita (DKC) and in some other conditions. People with DKC have abnormal changes in the skin and nails and white patches inside the mouth. They also have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
    More Information
    - TERC gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/terc/)
  terminal cancer: (TER-mih-nul KAN-ser)
    Pronunciation of dictionary term "terminal cancer"
    Cancer that cannot be cured or controlled with treatment and leads to death. A person with terminal cancer may receive treatment to help control pain and other symptoms so they can be as comfortable as possible and have a better quality of life. Also called end-stage cancer.
    More Information
    - Last Days of Life
    - End-of-Life Care for People Who Have Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/care-fact-sheet)
    - Coping with Advanced Cancer: Choices for Care Near the End of Life (https://www.cancer.gov/publications/patient-education/advanced-cancer)
    - Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices)
    - Young People Facing End-of-Life Care Decisions (https://www.cancer.gov/types/aya/end-of-life)
  terpene: (TER-peen)
    Pronunciation of dictionary term "terpene"
    A type of strong-smelling chemical substance found in some plants, especially trees that have cones. Terpenes are found in essential oils (scented liquid taken from plants).
  TERT gene: (... jeen)
    Pronunciation of dictionary term "TERT gene"
    A gene that makes a protein involved in maintaining telomeres (the ends of chromosomes). Mutations (changes) in the TERT gene have been found in some types of cancer, including melanoma, acute myeloid leukemia, breast cancer, and cholangiocarcinoma (cancer that forms in the bile ducts). Mutations in the TERT gene have also been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
    More Information
    - TERT gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/tert/)
  TESA: A procedure in which a sample of sperm cells and tissue are removed from the testicle through a small needle attached to a syringe. The sperm is separated from the tissue and looked at under a microscope in the laboratory. It may then be used right away to fertilize eggs or frozen for future infertility treatment. TESA may be useful for men who have fertility problems caused by a blockage that keeps sperm from being ejaculated. This could be caused by previous vasectomy, certain genetic conditions, ejaculation problems, infection, or other conditions. It may also be useful for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. TESA is a type of sperm retrieval method. Also called testicular sperm aspiration.
  TESE: A procedure in which sperm cells are removed and either used right away to fertilize eggs or frozen for future infertility treatment. Tissue is removed from the testicle through a small incision (cut) and looked at under a microscope in the laboratory to find sperm cells. TESE may be useful for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. TESE is a type of sperm retrieval method. Also called testicular sperm extraction.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  testicle: (TES-tih-kul)
    Pronunciation of dictionary term "testicle"
    One of two egg-shaped glands inside the scrotum that produce sperm and male hormones. Also called testis.
    More Information
    - Testicular Cancer (https://www.cancer.gov/types/testicular)
    Anatomy of the male reproductive system. The male reproductive system is made up of organs and glands involved in making offspring (children). These include the vas deferens (a long tube that carries sperm out of the testes), epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored), prostate gland, penis, and testes.
    Anatomy of the male reproductive system; drawing shows the vas deferens (a long tube that carries sperm out of the testes), prostate gland, penis, and testes. An inset shows the vas deferens and epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored).
  testicular cancer: (tes-TIH-kyoo-ler KAN-ser)
    Pronunciation of dictionary term "testicular cancer"
    Cancer that forms in tissues of one or both testicles. Testicular cancer is most common in young or middle-aged men. Most testicular cancers begin in germ cells (cells that make sperm) and are called testicular germ cell tumors.
    More Information
    - Testicular Cancer (https://www.cancer.gov/types/testicular)
    Anatomy of the male reproductive and urinary systems, showing the testicles, prostate, bladder, and other organs.
    Anatomy of the male reproductive and urinary systems; drawing shows front and side views of ureters, lymph nodes, rectum, bladder, prostate gland, vas deferens, urethra, penis, testicles, seminal vesicle, and ejaculatory duct.
  testicular cord: (tes-TIH-kyoo-ler kord)
    Pronunciation of dictionary term "testicular cord"
    A cord-like structure in the male reproductive system that contains nerves, blood and lymph vessels, and the vas deferens (a coiled tube that carries sperm out of the testicle). It runs from the abdomen to the testicle, and connects to the testicle in the scrotum (external sac). Also called spermatic cord.
  testicular germ cell tumor: (tes-TIH-kyoo-ler jerm sel TOO-mer)
    Pronunciation of dictionary term "testicular germ cell tumor"
    A type of tumor that forms in a testicle from germ cells (cells that make sperm). Two main types of testicular germ cell tumors are seminomas and nonseminomas. Seminomas grow and spread slowly and are sensitive to radiation therapy. Nonseminomas grow and spread more quickly than seminomas. There are several different types of nonseminomas.
  testicular intraepithelial neoplasia: (tes-TIH-kyoo-ler IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "testicular intraepithelial neoplasia"
    Abnormal cells are found in the tiny tubules where the sperm cells begin to develop. These abnormal cells may become cancer and spread into nearby normal tissue. All tumor marker levels are normal. Also called stage 0 testicular carcinoma in situ and testicular intratubular germ cell neoplasia.
    More Information
    - Testicular Cancer Treatment
  testicular intratubular germ cell neoplasia: (tes-TIH-kyoo-ler IN-truh-TOO-byoo-ler jerm sel NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "testicular intratubular germ cell neoplasia"
    Abnormal cells are found in the tiny tubules where the sperm cells begin to develop. These abnormal cells may become cancer and spread into nearby normal tissue. All tumor marker levels are normal. Also called stage 0 testicular carcinoma in situ and testicular intraepithelial neoplasia.
    More Information
    - Testicular Cancer Treatment
  testicular shielding: (tes-TIH-kyoo-ler SHEEL-ding)
    Pronunciation of dictionary term "testicular shielding"
    A procedure used to help keep a man fertile by preventing damage to the testicles during radiation therapy. A protective shield is placed over the scrotum (the external sac that contains the testicles) during radiation to the pelvic area. Testicular shielding is a type of fertility preservation.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  testicular sperm aspiration: (tes-TIH-kyoo-ler … AS-pih-RAY-shun)
    Pronunciation of dictionary term "testicular sperm aspiration"
    A procedure in which a sample of sperm cells and tissue are removed from the testicle through a small needle attached to a syringe. The sperm is separated from the tissue and looked at under a microscope in the laboratory. It may then be used right away to fertilize eggs or frozen for future infertility treatment. Testicular sperm aspiration may be useful for men who have fertility problems caused by a blockage that keeps sperm from being ejaculated. This could be caused by previous vasectomy, certain genetic conditions, ejaculation problems, infection, or other conditions. It may also be useful for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Testicular sperm aspiration is a type of sperm retrieval method. Also called TESA.
  testicular sperm extraction: (tes-TIH-kyoo-ler spurm ek-STRAK-shun)
    Pronunciation of dictionary term "testicular sperm extraction"
    A procedure in which sperm cells are removed and either used right away to fertilize eggs or frozen for future infertility treatment. Tissue is removed from the testicle through a small incision (cut) and looked at under a microscope in the laboratory to find sperm cells. Testicular sperm extraction may be useful for men who want to have children after having treatment that may cause infertility, such as certain cancer treatments. Testicular sperm extraction is a type of sperm retrieval method. Also called TESE.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  testicular tissue banking: (tes-TIH-kyoo-ler TIH-shoo BANK-ing)
    Pronunciation of dictionary term "testicular tissue banking"
    A process being developed to freeze testicular tissue from boys who have not gone through puberty, to save for future infertility treatment. Tissue that contains cells that make sperm is removed from the testicles through a small incision (cut). It is then frozen and stored. At a later date, the tissue can be thawed to retrieve sperm. Testicular tissue banking is being studied as a type of fertility preservation. It may be useful for young boys who are going to have treatments that may cause infertility, such as certain cancer treatments. Also called testicular tissue cryopreservation and testicular tissue freezing.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  testicular tissue cryopreservation: (tes-TIH-kyoo-ler TIH-shoo KRY-oh-PREH-zer-VAY-shun)
    Pronunciation of dictionary term "testicular tissue cryopreservation"
    A process being developed to freeze testicular tissue from boys who have not gone through puberty, to save for future infertility treatment. Tissue that contains cells that make sperm is removed from the testicles through a small incision (cut). It is then frozen and stored. At a later date, the tissue can be thawed to retrieve sperm. Testicular tissue cryopreservation is being studied as a type of fertility preservation. It may be useful for young boys who are going to have treatments that may cause infertility, such as certain cancer treatments. Also called testicular tissue banking and testicular tissue freezing.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  testicular tissue freezing: (tes-TIH-kyoo-ler TIH-shoo FREE-zing)
    Pronunciation of dictionary term "testicular tissue freezing"
    A process being developed to freeze testicular tissue from boys who have not gone through puberty, to save for future infertility treatment. Tissue that contains cells that make sperm is removed from the testicles through a small incision (cut). It is then frozen and stored. At a later date, the tissue can be thawed to retrieve sperm. Testicular tissue freezing is being studied as a type of fertility preservation. It may be useful for young boys who are going to have treatments that may cause infertility, such as certain cancer treatments. Also called testicular tissue banking and testicular tissue cryopreservation.
    More Information
    - Fertility Issues in Boys and Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-men)
  testimonial: (TES-tih-MOH-nee-ul)
    Pronunciation of dictionary term "testimonial"
    Information provided by an individual who claims to have been helped or cured by a particular product. The information provided lacks the necessary elements to be evaluated in a rigorous and scientific manner and is not used in the scientific literature.
  testis: (TES-tis)
    Pronunciation of dictionary term "testis"
    One of two egg-shaped glands inside the scrotum that produce sperm and male hormones. Also called testicle.
    More Information
    - Testicular Cancer (https://www.cancer.gov/types/testicular)
    Anatomy of the male reproductive system. The male reproductive system is made up of organs and glands involved in making offspring (children). These include the vas deferens (a long tube that carries sperm out of the testes), epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored), prostate gland, penis, and testes.
    Anatomy of the male reproductive system; drawing shows the vas deferens (a long tube that carries sperm out of the testes), prostate gland, penis, and testes. An inset shows the vas deferens and epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored).
  testosterone: (tes-TOS-teh-rone)
    Pronunciation of dictionary term "testosterone"
    A hormone made mainly in the testes (part of the male reproductive system). It is needed to develop and maintain male sex characteristics, such as facial hair, deep voice, and muscle growth. Testosterone may also be made in the laboratory and is used to treat certain medical conditions.
  testosterone flare: (tes-TOS-teh-rone flayr)
    Pronunciation of dictionary term "testosterone flare"
    A temporary increase in testosterone levels in the body caused by certain types of hormone therapy used to treat prostate cancer. A testosterone flare may occur in patients who are taking drugs called gonadotropin-releasing hormone (GnRH) agonists. When first given, these drugs cause the testicles to make more testosterone. This may cause symptoms, such as bone pain and urinary problems, to get worse, but they usually go away after the first few weeks of treatment.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  tetanus toxoid: (TEH-tuh-nus TOK-soyd)
    Pronunciation of dictionary term "tetanus toxoid"
    A substance that is derived from the toxin released by the bacterium that causes the disease tetanus. It is used as a vaccine to prevent tetanus or to help boost the immune response to other vaccines.
  tethered capsule endoscope: (TEH-thurd KAP-sul EN-doh-SKOPE)
    Pronunciation of dictionary term "tethered capsule endoscope"
    A device used to look at tissues in the esophagus. It is a tiny capsule with a laser scanner inside and a very thin cord attached to it. The patient swallows the capsule and the thin cord helps keep the capsule in a specific area in the esophagus. The cord is also used to remove the capsule. Pictures are taken by the laser scanner and sent to a computer for viewing. A tethered capsule endoscope is used to find early cancers of the esophagus and other parts of the body. Also called TCE.
  tetra-O-methyl NDGA: (TEH-truh-O-MEH-thul ...)
    Pronunciation of dictionary term "tetra-O-methyl NDGA"
    A substance being studied in the treatment of cancer. It blocks proteins needed for cancer growth. It is a type of transcriptional inhibitor. Also called EM-1421 and tetra-O-methyl nordihydroguaiaretic acid.
  tetra-O-methyl nordihydroguaiaretic acid: (TEH-truh-O-MEH-thul NOR-dy-HY-droh-GWY-uh-reh-tik A-sid)
    Pronunciation of dictionary term "tetra-O-methyl nordihydroguaiaretic acid"
    A substance being studied in the treatment of cancer. It blocks proteins needed for cancer growth. It is a type of transcriptional inhibitor. Also called EM-1421 and tetra-O-methyl NDGA.
  tetracycline: (TEH-truh-SY-kleen)
    Pronunciation of dictionary term "tetracycline"
    A drug used to treat bacterial infections. It stops the growth of bacteria by keeping them from making proteins. Tetracycline also binds to new bone tissue and is being studied as a way to detect bone growth. Tetracycline is a type of antibiotic and a type of bone-labeling agent.
  tetradecanoylphorbol acetate: (TEH-truh-DEH-kuh-noyl-FOR-bol A-seh-tayt)
    Pronunciation of dictionary term "tetradecanoylphorbol acetate"
    A substance being studied in the treatment of leukemias and lymphomas. It is also being studied in the treatment of other types of cancer. Tetradecanoylphorbol acetate affects many cell actions and may cause tumor cells to die. It is a type of phorbol ester. Also called 12-O-tetradecanoylphorbol-13-acetate.
  tetrahydrouridine: (TEH-truh-HY-droh-YOOR-ih-deen)
    Pronunciation of dictionary term "tetrahydrouridine"
    A substance being studied in the treatment of some types of cancer. It may help make cancer cells easier to kill with radiation therapy. Tetrahydrouridine is a type of radiosensitizing agent, a type of multidrug resistance modulator, and a type of cytidine deaminase inhibitor. Also called THU.
  Tevimbra: (teh-VIM-brah)
    Pronunciation of dictionary term "Tevimbra"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Tevimbra is used with alone or with other drugs to treat adults with certain types of gastric adenocarcinoma, gastroesophageal junction adenocarcinoma, or squamous cell carcinoma of the esophagus. It is also being studied in the treatment of other types of cancer. Tevimbra may block PD-L1 and help the immune system kill cancer cells. Tevimbra is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called tislelizumab.
    More Information
    - Tislelizumab-jsgr (https://www.cancer.gov/about-cancer/treatment/drugs/tislelizumab-jsgr)
  TG4010: A substance that is being studied as an anticancer drug.
  TGCT: A type of rare tumor that forms in the synovium (tissue that lines the joints), the tendon sheath (tissue that covers the tendons), or the bursa (a fluid-filled sac between bones, tendons, and muscles). These tumors cause the affected synovium, tendon sheath, or bursa to thicken and overgrow. TGCTs can occur in any joint. Although TGCTs are not cancer, they can grow and cause damage to surrounding tissues or structures. Symptoms may include reduced movement or pain in the affected joint and a locking or catching sensation when moving the joint. TGCTs usually occur in young and middle-aged adults. Also called tenosynovial giant cell tumor.
  TGFBR1 gene: (... jeen)
    Pronunciation of dictionary term "TGFBR1 gene"
    A gene that makes a protein involved in controlling cell growth, cell division, cell differentiation, cell movement, and cell death. Mutations (changes) in the TGFBR1 gene have been found in an inherited condition called multiple self-healing squamous epithelioma (MSSE) and in some other conditions. People with MSSE develop many fast-growing tumors that look like squamous cell skin cancer.
    More Information
    - TGFBR1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/tgfbr1/)
  thalamus: (THA-luh-mus)
    Pronunciation of dictionary term "thalamus"
    An area of the brain that helps process information from the senses and transmit it to other parts of the brain.
  thalidomide: (thuh-LIH-doh-mide)
    Pronunciation of dictionary term "thalidomide"
    A drug used with dexamethasone to treat multiple myeloma in patients who have been just diagnosed. It is also used to treat a painful skin disease related to leprosy. It is also being studied in the treatment of other types of cancer. Thalidomide may help the immune system kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. Thalidomide is a type of antiangiogenesis agent and a type of immunomodulating agent. Also called Thalomid.
    More Information
    - Thalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/thalidomide)
  Thalomid: (THA-loh-MID)
    Pronunciation of dictionary term "Thalomid"
    A drug used with dexamethasone to treat multiple myeloma in patients who have been just diagnosed. It is also used to treat a painful skin disease related to leprosy. It is also being studied in the treatment of other types of cancer. Thalomid may help the immune system kill cancer cells. It may also prevent the growth of new blood vessels that tumors need to grow. Thalomid is a type of antiangiogenesis agent and a type of immunomodulating agent. Also called thalidomide.
    More Information
    - Thalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/thalidomide)
  The Cancer Genome Atlas: (… KAN-ser JEE-nome AT-lus)
    Pronunciation of dictionary term "The Cancer Genome Atlas"
    A project to identify the complete set of DNA changes in many different types of cancer. Studying these changes may help researchers understand how different types of cancer form. This may lead to new ways to prevent, diagnose, and treat cancer. The Cancer Genome Atlas is led by the National Cancer Institute (NCI) and the National Human Genome Research Institute (NHGRI), which are parts of the National Institutes of Health (NIH). Also called TCGA.
  theaflavin: (thee-uh-FLAY-vin)
    Pronunciation of dictionary term "theaflavin"
    A substance formed when green tea is fermented to make black tea. It is being studied in the treatment of cancer and other conditions, such as high cholesterol. It is a type of antioxidant.
  thearubigin: (thee-uh-ROO-bih-jin)
    Pronunciation of dictionary term "thearubigin"
    A substance formed when green tea is fermented to make black tea. It is being studied in the treatment of cancer and other conditions, such as high cholesterol. It is a type of antioxidant.
  theobromine: (thee-oh-BROH-meen)
    Pronunciation of dictionary term "theobromine"
    A substance that is closely related to caffeine and is found in cocoa beans, cola nuts, and tea. It may also be made in the laboratory. Theobromine is used to increase the amount of urine made by the kidneys, to stimulate the heart, and to widen blood vessels. It is a type of alkaloid.
  theophylline: (thee-AH-fih-lin)
    Pronunciation of dictionary term "theophylline"
    A drug used to improve breathing in people who are short of breath. It belongs to the family of drugs called bronchodilators or respiratory smooth muscle relaxants.
  Theraloc: (THAYR-uh-lok)
    Pronunciation of dictionary term "Theraloc"
    A substance being studied in the treatment of some types of cancer. Theraloc binds to a protein called epidermal growth factor receptor (EGFR), which is found on some normal cells and some types of cancer cells. Blocking this protein may help keep cancer cells from growing. Theraloc is a type of monoclonal antibody. Also called nimotuzumab.
  therapeutic: (THAYR-uh-PYOO-tik)
    Pronunciation of dictionary term "therapeutic"
    Having to do with treating disease and helping healing take place.
  therapeutic (subthreshold) electrical stimulation: (THAYR-uh-PYOO-tik … ee-LEK-trih-kul STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "therapeutic (subthreshold) electrical stimulation"
    A procedure in which small electric impulses are used to stimulate muscles that are weak or paralyzed. It helps to increase muscle strength, blood circulation, and range of motion and to lessen muscle spasms. Also called NES, neuromuscular electrical stimulation, and NMES.
  therapeutic angiotensin-(1-7): (THAYR-uh-PYOO-tik AN-jee-oh-TEN-sin ...)
    Pronunciation of dictionary term "therapeutic angiotensin-(1-7)"
    A substance being studied in the treatment of several types of cancer. Therapeutic angiotensin-(1-7) is a hormone that is made in the laboratory, and helps control blood pressure. It may stop the growth of some types of cancer cells and may stop the growth of blood vessels needed by tumors to grow. It is a type of antiproliferative agent.
  therapeutic medical play: (THAYR-uh-PYOO-tik MEH-dih-kul …)
    Pronunciation of dictionary term "therapeutic medical play"
    The use of games, toys, books, art, and role playing, sometimes with real or pretend medical equipment, to help children understand and become more comfortable with medical tests, procedures, treatments, and their illness. Therapeutic medical play gives children a way to express their feelings, fears, and anxieties and helps them learn ways to cope with things that may be stressful or upsetting.
  therapeutic touch: (THAYR-uh-PYOO-tik tuch)
    Pronunciation of dictionary term "therapeutic touch"
    A form of complementary and alternative medicine based on the belief that vital energy flows through the human body. This energy is said to be balanced or made stronger by practitioners who pass their hands over, or gently touch, a patient's body. Therapeutic touch is being studied in patients receiving cancer therapy, to find out if it can improve quality of life, boost the immune system, or reduce side effects. Therapeutic touch is a type of energy therapy. Also called healing touch.
  therapy: (THAYR-uh-pee)
    Pronunciation of dictionary term "therapy"
    Treatment.
    More Information
    - Cancer Treatment (https://www.cancer.gov/about-cancer/treatment)
    - PDQ® Cancer Information Summaries: Adult Treatment (https://www.cancer.gov/publications/pdq/information-summaries/adult-treatment)
  therapy-related acute myeloid leukemia: (THAYR-uh-pee-ree-LAY-ted uh-KYOOT MY-eh-loyd loo-KEE-mee-uh)
    Pronunciation of dictionary term "therapy-related acute myeloid leukemia"
    A type of acute myeloid leukemia (AML) that is caused by previous treatment with chemotherapy or radiation therapy. Therapy-related acute myeloid leukemia is an aggressive (fast-growing) cancer in which there are too many myeloblasts (immature white blood cells) in the blood or bone marrow. Therapy-related acute myeloid leukemia usually occurs within 7 years after treatment. It is more common in adults. Also called t-AML.
  thermal ablation: (THER-mul a-BLAY-shun)
    Pronunciation of dictionary term "thermal ablation"
    A procedure using heat to remove tissue or a part of the body, or destroy its function. For example, to remove the lining of the uterus, a catheter is inserted through the cervix into the uterus, a balloon at the end of the catheter is inflated, and fluid inside the balloon is heated to destroy the lining of the uterus.
  thermography: (ther-MAH-gruh-fee)
    Pronunciation of dictionary term "thermography"
    In medicine, a procedure in which a heat-sensing infrared camera is used to record the surface heat produced by different parts of the body. Abnormal tissue growth can cause temperature changes, which may show up on the thermogram. Thermography may be used to diagnose breast cancer and other tumors.
  thermotherapy: (THER-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "thermotherapy"
    Treatment of disease using heat.
  thiamine: (THY-uh-min)
    Pronunciation of dictionary term "thiamine"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Thiamine helps some enzymes work properly, helps break down sugars in the diet, and keeps nerves and the heart healthy. It is found in pork, organ meats, peas, beans, nuts, and whole grains. Thiamine is water-soluble (can dissolve in water) and must be taken in daily. Not enough thiamine can cause a disease called beriberi (a condition marked by heart, nerve, and digestive disorders). Too much thiamine may help cancer cells grow faster. Also called vitamin B1.
  thiazide diuretic: (THY-uh-zide DY-yoo-REH-tik)
    Pronunciation of dictionary term "thiazide diuretic"
    A type of drug used to treat high blood pressure, edema (extra fluid in the tissues), and other conditions. Thiazide diuretics cause the kidneys to make more urine, which allows the body to get rid of extra fluid and salt.
  thiethylperazine: (thy-EH-thul-PAYR-uh-zeen)
    Pronunciation of dictionary term "thiethylperazine"
    A drug used to prevent or reduce nausea and vomiting. It belongs to the families of drugs called antiemetics and phenothiazines.
  thioguanine: (THY-oh-GWAH-neen)
    Pronunciation of dictionary term "thioguanine"
    A drug used to treat acute myeloid leukemia. It is also being studied in the treatment of other types of cancer. Thioguanine stops cells from making DNA and RNA and may kill cancer cells. It is a type of antimetabolite. Also called Tabloid.
    More Information
    - Thioguanine (https://www.cancer.gov/about-cancer/treatment/drugs/thioguanine)
  thiotepa: (THY-oh-TEH-puh)
    Pronunciation of dictionary term "thiotepa"
    A drug used to treat certain types of bladder cancer, breast cancer, ovarian cancer, and malignant effusion (a condition in which cancer causes an abnormal amount of fluid to collect in hollow spaces or between tissues of the body). It is also being studied in the treatment of other types of cancer. Thiotepa damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Tepadina.
    More Information
    - Thiotepa (https://www.cancer.gov/about-cancer/treatment/drugs/thiotepa)
  third molar: (...MOH-ler)
    Pronunciation of dictionary term "third molar"
    The last tooth to come in at the back of each side of the upper and lower jaws. Third molars usually come in between 17 and 23 years of age, but not everyone has them. Also called wisdom tooth.
  third-degree relative: (... deh-GREE REH-luh-tiv)
    A way of describing how family members are related to each other when there are two other family members in the blood line between them. Examples of a third-degree relative are a first cousin, great-grandparent, great-aunt, great-uncle, great-niece, great-nephew, great-grandchild, half-aunt, or half-uncle. Also called TDR.
  third-line therapy: (... THAYR-uh-pee)
    Pronunciation of dictionary term "third-line therapy"
    Treatment that is given when both initial treatment (first-line therapy) and subsequent treatment (second-line therapy) don’t work, or stop working.
  thoracalgia: (THOR-uh-KAL-juh)
    Pronunciation of dictionary term "thoracalgia"
    Chest pain. Also called thoracodynia.
  thoracentesis: (THOR-uh-sen-TEE-sis)
    Pronunciation of dictionary term "thoracentesis"
    Removal of fluid from the pleural cavity through a needle inserted between the ribs.
  thoracic: (thor-A-sik)
    Pronunciation of dictionary term "thoracic"
    Having to do with the chest.
  thoracic surgeon: (thor-A-sik SER-jun)
    Pronunciation of dictionary term "thoracic surgeon"
    A surgeon who has special training in operating on organs inside the chest, including the heart and lungs.
  thoracic surgical oncologist: (thor-A-sik SER-jih-kul on-KAH-loh-jist)
    Pronunciation of dictionary term "thoracic surgical oncologist"
    A surgeon who has special training in operating on tumors found inside the chest.
  thoracodynia: (THOR-uh-koh-DIN-ee-uh)
    Pronunciation of dictionary term "thoracodynia"
    Chest pain. Also called thoracalgia.
  thoracoscope: (thor-A-koh-skope)
    Pronunciation of dictionary term "thoracoscope"
    A thin tube-like instrument used to examine the inside of the chest. A thoracoscope has a light and a lens for viewing and may have tool to remove tissue.
  thoracoscopy: (THOR-uh-KOS-koh-pee)
    Pronunciation of dictionary term "thoracoscopy"
    Examination of the inside of the chest, using a thoracoscope. A thoracoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease.
  thoracotomy: (THOR-uh-KAH-toh-mee)
    Pronunciation of dictionary term "thoracotomy"
    An operation to open the chest.
  thorax: (THOR-ax)
    Pronunciation of dictionary term "thorax"
    The area of the body between the neck and the abdomen. The thorax contains vital organs, including the heart, major blood vessels, and lungs. It is supported by the ribs, breastbone, and spine. A thin muscle called the diaphragm separates the thorax from the abdomen.
  throat: (throte)
    Pronunciation of dictionary term "throat"
    The hollow, muscular tube inside the neck that starts behind the nose and ends at the top of the trachea (windpipe) and esophagus (the tube that goes to the stomach). The throat acts as a passageway for air to enter the lungs and food and liquid to enter the esophagus. It contains many structures, including the tonsils, adenoids, pharynx, and larynx.
    Anatomy of the throat. The throat is a hollow, muscular tube inside the neck that acts as a passageway for air to enter the lungs and for food and liquid to enter the esophagus. It contains many structures, including the adenoids, tonsils, pharynx (the nasopharynx, oropharynx, and hypopharynx), larynx, esophagus, and trachea.
    Anatomy of the throat; drawing shows the pharynx, which includes the nasopharynx, oropharynx, and hypopharynx. Also shown are the adenoids, tonsils, larynx, esophagus, and trachea.
  throat cancer: (throte KAN-ser)
    Pronunciation of dictionary term "throat cancer"
    Cancer that forms in tissues of the pharynx or larynx. Most throat cancers are squamous cell carcinomas (cancers that begin in thin, flat cells that look like fish scales under a microscope).
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Anatomy of the throat. The throat is a hollow, muscular tube inside the neck that acts as a passageway for air to enter the lungs and for food and liquid to enter the esophagus. It contains many structures, including the adenoids, tonsils, pharynx (the nasopharynx, oropharynx, and hypopharynx), larynx, esophagus, and trachea.
    Anatomy of the throat; drawing shows the pharynx, which includes the nasopharynx, oropharynx, and hypopharynx. Also shown are the adenoids, tonsils, larynx, esophagus, and trachea.
  thrombectomy: (throm-BEK-toh-mee)
    Pronunciation of dictionary term "thrombectomy"
    Surgery to remove a thrombus (blood clot) from a blood vessel.
  thrombocyte: (THROM-boh-site)
    Pronunciation of dictionary term "thrombocyte"
    A tiny, disc-shaped piece of cell that is found in the blood and spleen. Thrombocytes are pieces of very large cells in the bone marrow called megakaryocytes. They help form blood clots to slow or stop bleeding and to help wounds heal. Having too many or too few thrombocytes or having platelets that don’t work as they should can cause problems. Checking the number of thrombocytes in the blood may help diagnose certain diseases or conditions. Also called platelet.
    Blood cells. Blood contains many types of cells: white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), red blood cells (erythrocytes), and platelets. Blood circulates through the body in the arteries and veins.
    Blood cells; drawing shows six types of white blood cells (monocytes, lymphocytes, neutrophils, eosinophils, basophils, and macrophages), a red blood cell (erythrocyte), and platelets.
  thrombocytopenia: (THROM-boh-sy-toh-PEE-nee-uh)
    Pronunciation of dictionary term "thrombocytopenia"
    A condition in which there is a lower-than-normal number of platelets in the blood. It may result in easy bruising and excessive bleeding from wounds or bleeding in mucous membranes and other tissues.
    More Information
    - Bleeding and Bruising (Thrombocytopenia) and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/bleeding-bruising)
  thrombohemorrhagic event: (THROM-boh-HEH-muh-RA-jik eh-VENT)
    Pronunciation of dictionary term "thrombohemorrhagic event"
    A process that involves either a blood clot or bleeding, such as a heart attack or stroke.
  thrombolysis: (throm-BOL-ih-sis)
    Pronunciation of dictionary term "thrombolysis"
    The process of breaking up a thrombus (blood clot) that is blocking blood flow. The blood clot may be dissolved using drugs delivered through a catheter (tube) into the clot.
  thrombophlebitis: (THROM-boh-fleh-BY-tis)
    Pronunciation of dictionary term "thrombophlebitis"
    Inflammation of a vein that occurs when a blood clot forms.
  thrombopoietin: (THROM-boh-POY-eh-tin)
    Pronunciation of dictionary term "thrombopoietin"
    A substance made by the body that helps make blood cells, especially platelets. A form of thrombopoietin made in the laboratory is called recombinant human thrombopoietin and rHu thrombopoietin. Thrombopoietin is being studied as a way to increase the number of platelets in cancer patients receiving chemotherapy. Also called TPO.
  thrombosis: (throm-BOH-sis)
    Pronunciation of dictionary term "thrombosis"
    The formation or presence of a thrombus (blood clot) inside a blood vessel.
  thrombus: (THROM-bus)
    Pronunciation of dictionary term "thrombus"
    A blood clot that forms on the wall of a blood vessel or in the heart when blood platelets, proteins, and cells stick together. A thrombus may block the flow of blood.
  thrush: (thrush)
    Pronunciation of dictionary term "thrush"
    A condition in which Candida albicans, a type of yeast, grows out of control in moist skin areas of the body. It is usually a result of a weakened immune system, but can be a side effect of chemotherapy or treatment with antibiotics. Thrush usually affects the mouth (oral thrush); however, rarely, it spreads throughout the entire body. Also called candidiasis and candidosis.
  THU: A substance being studied in the treatment of some types of cancer. It may help make cancer cells easier to kill with radiation therapy. THU is a type of radiosensitizing agent, a type of multidrug resistance modulator, and a type of cytidine deaminase inhibitor. Also called tetrahydrouridine.
  thymic carcinoma: (THY-mik KAR-sih-NOH-muh)
    Pronunciation of dictionary term "thymic carcinoma"
    A rare type of thymus gland cancer. It usually spreads, has a high risk of recurrence, and has a poor survival rate. Thymic carcinoma is divided into subtypes, depending on the types of cells in which the cancer began. Also called type C thymoma.
    More Information
    - Thymoma and Thymic Carcinoma (https://www.cancer.gov/types/thymoma)
  thymidine: (THY-mih-deen)
    Pronunciation of dictionary term "thymidine"
    A chemical compound found in DNA. Also used as treatment for mucositis.
  thymidylate synthase: (THY-mih-DIH-layt SIN-thays)
    Pronunciation of dictionary term "thymidylate synthase"
    A protein involved in making and repairing DNA (molecules inside cells that carry genetic information and pass it on from parent to child). High levels of thymidylate synthase may be involved in how certain types of cancer form and respond to treatment.
  thymidylate synthase inhibitor: (THY-mih-DIH-layt SIN-thays in-HIH-bih-ter)
    Pronunciation of dictionary term "thymidylate synthase inhibitor"
    A drug that blocks DNA synthesis and may prevent tumor cell growth. It is being studied as a treatment for cancer.
  thymine: (THY-meen)
    Pronunciation of dictionary term "thymine"
    A chemical compound that is used to make one of the building blocks of DNA. It is a type of pyrimidine.
    Structure of DNA. Most DNA is found inside the nucleus of a cell, where it forms the chromosomes. Chromosomes have proteins called histones that bind to DNA. DNA has two strands that twist into the shape of a spiral ladder called a helix. DNA is made up of four building blocks called nucleotides: adenine (A), thymine (T), guanine (G), and cytosine (C). The nucleotides attach to each other (A with T, and G with C) to form chemical bonds called base pairs, which connect the two DNA strands. Genes are short pieces of DNA that carry specific genetic information.
    Structure of DNA; drawing shows a chromosome, nucleosome, histone, gene, and nucleotide base pairs: guanine, cytosine, adenine, and thymine. Also shown is a cell and its nucleus.
  Thymitaq: (THY-mih-tak)
    Pronunciation of dictionary term "Thymitaq"
    A substance that is being studied in the treatment of liver cancer. It belongs to the family of drugs called thymidylate synthase inhibitors. Also called AG337 and nolatrexed.
  thymocyte: (THY-moh-site)
    Pronunciation of dictionary term "thymocyte"
    A type of white blood cell. Thymocytes are part of the immune system and develop from stem cells in the bone marrow. They help protect the body from infection and may help fight cancer. Also called T cell and T lymphocyte.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  thymoma: (thy-MOH-muh)
    Pronunciation of dictionary term "thymoma"
    A tumor of the thymus, an organ that is part of the lymphatic system and is located in the chest, behind the breastbone.
    More Information
    - Thymoma and Thymic Carcinoma (https://www.cancer.gov/types/thymoma)
  thymus: (THY-mus)
    Pronunciation of dictionary term "thymus"
    An organ that is part of the lymphatic system, in which T lymphocytes grow and multiply. The thymus is in the chest behind the breastbone.
    More Information
    - Thymoma and Thymic Carcinoma (https://www.cancer.gov/types/thymoma)
    Anatomy of the thymus gland. The thymus gland is a small organ that lies in the upper chest under the breastbone. It makes white blood cells, called lymphocytes, which protect the body against infections.
    Anatomy of the thymus gland; drawing shows the thymus gland in the upper chest under the breastbone. Also shown are the ribs, lungs, and heart.
  Thyrogen: (THY-roh-jen)
    Pronunciation of dictionary term "Thyrogen"
    A form of thyroid-stimulating hormone (TSH) that is made in the laboratory. It is used to test for remaining or recurring cancer cells in patients who have been treated for thyroid cancer. Also called thyrotropin alfa.
  thyroglobulin: (THY-roh-GLAH-byoo-lin)
    Pronunciation of dictionary term "thyroglobulin"
    The form that thyroid hormone takes when stored in the cells of the thyroid. If the thyroid has been removed, thyroglobulin should not show up on a blood test. Doctors measure thyroglobulin level in blood to detect thyroid cancer cells that remain in the body after treatment.
  thyroid: (THY-royd)
    Pronunciation of dictionary term "thyroid"
    A gland located beneath the larynx (voice box) that makes thyroid hormone and calcitonin. The thyroid helps regulate growth and metabolism. Also called thyroid gland.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
    Anatomy of the thyroid and parathyroid glands. The thyroid gland lies at the base of the throat near the trachea. It is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The parathyroid glands are four pea-sized organs found in the neck near the thyroid. The thyroid and parathyroid glands make hormones.
    Anatomy of the thyroid and parathyroid glands; drawing shows the thyroid gland at the base of the throat near the trachea. An inset shows the front and back views. The front view shows that the thyroid is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The back view shows the four pea-sized parathyroid glands. The larynx is also shown.
  thyroid cancer: (THY-royd KAN-ser)
    Pronunciation of dictionary term "thyroid cancer"
    Cancer that forms in the thyroid gland (an organ at the base of the throat that makes hormones that help control heart rate, blood pressure, body temperature, and weight). Four main types of thyroid cancer are papillary, follicular, medullary, and anaplastic thyroid cancer. The four types are based on how the cancer cells look under a microscope.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
  thyroid cartilage: (THY-royd KAR-tih-lij)
    Pronunciation of dictionary term "thyroid cartilage"
    The tough, flexible tissue that forms the front part of the larynx (voice box). It supports and protects the vocal cords and helps create the sound of a person’s voice. The thyroid cartilage also forms the Adam’s apple, which often appears as a lump on the front of the neck.
  thyroid follicular cell: (THY-royd fuh-LIH-kyoo-ler sel)
    Pronunciation of dictionary term "thyroid follicular cell"
    A type of cell in the thyroid. Thyroid follicular cells make thyroid hormone.
  thyroid gland: (THY-royd...)
    Pronunciation of dictionary term "thyroid gland"
    A gland located beneath the larynx (voice box) that makes thyroid hormone and calcitonin. The thyroid gland helps regulate growth and metabolism. Also called thyroid.
    More Information
    - Thyroid Cancer (https://www.cancer.gov/types/thyroid)
    Anatomy of the thyroid and parathyroid glands. The thyroid gland lies at the base of the throat near the trachea. It is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The parathyroid glands are four pea-sized organs found in the neck near the thyroid. The thyroid and parathyroid glands make hormones.
    Anatomy of the thyroid and parathyroid glands; drawing shows the thyroid gland at the base of the throat near the trachea. An inset shows the front and back views. The front view shows that the thyroid is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The back view shows the four pea-sized parathyroid glands. The larynx is also shown.
  thyroid hormone: (THY-royd HOR-mone)
    Pronunciation of dictionary term "thyroid hormone"
    A hormone that affects heart rate, blood pressure, body temperature, and weight. Thyroid hormone is made by the thyroid gland and can also be made in the laboratory.
  thyroid hormone treatment: (THY-royd HOR-mone TREET-ment)
    Pronunciation of dictionary term "thyroid hormone treatment"
    Treatment with thyroid hormone, which is a hormone that affects heart rate, blood pressure, body temperature, and weight.
  thyroid-stimulating hormone: (THY-royd STIM-yoo-LAY-ting HOR-mone)
    Pronunciation of dictionary term "thyroid-stimulating hormone"
    A hormone produced by the pituitary gland. Thyroid-stimulating hormone stimulates the release of thyroid hormone from thyroglobulin. It also stimulates the growth of thyroid follicular cells. An abnormal thyroid-stimulating hormone level may mean that the thyroid hormonal regulation system is out of control, usually as a result of a benign condition (hyperthyroidism or hypothyroidism). Also called TSH.
  thyroidectomy: (THY-roy-DEK-toh-mee)
    Pronunciation of dictionary term "thyroidectomy"
    Surgery to remove part or all of the thyroid.
  thyroiditis: (thy-roy-DY-tis)
    Pronunciation of dictionary term "thyroiditis"
    Inflammation of the thyroid gland. Thyroiditis may be an autoimmune disease that affects the thyroid gland over time, causing hypothyroidism (too little thyroid hormone). A temporary form of thyroiditis may also occur after the birth of a baby, or when viral or bacterial infections spread to the thyroid.
  thyroidologist: (THY-roy-DAH-loh-jist)
    Pronunciation of dictionary term "thyroidologist"
    A medical doctor who has special training in diagnosing and treating thyroid diseases.
  thyrotropin alfa: (THY-roh-TROH-pin AL-fuh)
    Pronunciation of dictionary term "thyrotropin alfa"
    A form of thyroid-stimulating hormone (TSH) that is made in the laboratory. It is used to test for remaining or recurring cancer cells in patients who have been treated for thyroid cancer. Also called Thyrogen.
  thyroxin: (thy-ROK-sin)
    Pronunciation of dictionary term "thyroxin"
    A hormone that is made by the thyroid gland and contains iodine. Thyroxin increases the rate of chemical reactions in cells and helps control growth and development. Thyroxin can also be made in the laboratory and is used to treat thyroid disorders. Also called L-3,5,5’-tetraiodothyronine, T4, and thyroxine.
  thyroxine: (thy-ROK-seen)
    Pronunciation of dictionary term "thyroxine"
    A hormone that is made by the thyroid gland and contains iodine. Thyroxine increases the rate of chemical reactions in cells and helps control growth and development. Thyroxine can also be made in the laboratory and is used to treat thyroid disorders. Also called L-3,5,5’-tetraiodothyronine, T4, and thyroxin.
  tiacumicin B: (ty-a-KYOO-my-sin ...)
    Pronunciation of dictionary term "tiacumicin B"
    A substance being studied in the treatment of diarrhea caused by infection with Clostridium difficile (a type of bacteria that can grow without oxygen) in cancer patients. Tiacumicin B is a type of antibiotic. Also called OPT-80 and PAR-101.
  tiazofurin: (ty-A-zoh-FYOOR-in)
    Pronunciation of dictionary term "tiazofurin"
    An anticancer drug being studied to stop cell growth.
  tibia: (TIH-bee-uh)
    Pronunciation of dictionary term "tibia"
    The larger of two bones between the knee and ankle. Also called shinbone.
  Tibsovo: (tib-SOH-voh)
    Pronunciation of dictionary term "Tibsovo"
    A drug used alone or with other drugs to treat adults with certain types of acute myeloid leukemia, cholangiocarcinoma (a type of bile duct cancer), or myelodysplastic syndromes that have a mutation (change) in the IDH1 gene. It is also being studied in the treatment of other types of cancer. Tibsovo blocks the protein made by the mutated IDH1 gene, which may help keep cancer cells from growing. It is a type of enzyme inhibitor and a type of targeted therapy. Also called ivosidenib.
    More Information
    - Ivosidenib (https://www.cancer.gov/about-cancer/treatment/drugs/ivosidenib)
  TIL: A type of immune cell that has moved from the blood into a tumor. TILs can recognize and kill cancer cells. In cancer therapy, TILs are removed from a patient’s tumor, grown in large numbers in a laboratory, and then given back to the patient to help the immune system kill the cancer cells. Also called tumor-infiltrating lymphocyte.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
  TIL therapy: (... THAYR-uh-pee)
    Pronunciation of dictionary term "TIL therapy"
    A type of treatment in which tumor-infiltrating lymphocytes (a type of immune cell that can recognize and kill cancer cells) are removed from a patient’s tumor and grown in large numbers in a laboratory. These lymphocytes are then given back to the patient by infusion to help the immune system kill the cancer cells. Also called tumor-infiltrating lymphocyte therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
  time to progression: (… pruh-GREH-shun)
    Pronunciation of dictionary term "time to progression"
    The length of time from the date of diagnosis or the start of treatment for a disease until the disease starts to get worse or spread to other parts of the body. In a clinical trial, measuring the time to progression is one way to see how well a new treatment works. Also called TTP.
  tin ethyl etiopurpurin: (tin EH-thul EE-tee-oh-PUR-pyoo-rin)
    Pronunciation of dictionary term "tin ethyl etiopurpurin"
    An anticancer drug that is also used in cancer prevention. It belongs to the family of drugs called photosensitizing agents. Also called SnET2.
  TINF2 gene: (… jeen)
    Pronunciation of dictionary term "TINF2 gene"
    A gene that makes a protein involved in protecting telomeres (the ends of chromosomes), which help keep chromosomes from sticking together or breaking down. Mutations (changes) in the TINF2 gene may cause damage to chromosomes and DNA, which may lead to abnormal cell growth. TINF2 gene mutations have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
    More Information
    - TINF2 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/tinf2/)
  tinidazole: (ty-NIH-duh-zole)
    Pronunciation of dictionary term "tinidazole"
    A drug used to treat protozoal infections, such as amebiasis, giardiasis, and trichomoniasis. It belongs to a family of drugs called antiprotozoal agents. Tinidazole is also being evaluated in the treatment of Helicobacter pylori infections in people with low-grade gastric lymphoma.
  tinnitus: (tih-NY-tus)
    Pronunciation of dictionary term "tinnitus"
    A disorder in which a person hears noises such as buzzing, ringing, clicking, or the sound of a pulse, when no outside sound is causing them. Tinnitus may have many different causes, and may be a symptom of another disease or condition. It may be caused by certain tumors and anticancer drugs.
  tinzaparin: (tin-ZA-puh-rin)
    Pronunciation of dictionary term "tinzaparin"
    A drug that is used with another drug, warfarin, to treat blood clots that form deep in the veins and to prevent new blood clots from forming. It is a type of anticoagulant. Also called Innohep and tinzaparin sodium.
  tinzaparin sodium: (tin-ZA-puh-rin SOH-dee-um)
    Pronunciation of dictionary term "tinzaparin sodium"
    A drug that is used with another drug, warfarin, to treat blood clots that form deep in the veins and to prevent new blood clots from forming. It is a type of anticoagulant. Also called Innohep.
  tipifarnib: (tih-pee-FAR-nib)
    Pronunciation of dictionary term "tipifarnib"
    A substance that is being studied in the treatment of acute myeloid leukemia (AML) and other types of cancer. It belongs to the family of drugs called farnesyltransferase inhibitors. Also called R115777 and Zarnestra.
  tipranavir sodium: (tih-PRA-nuh-veer SOH-dee-um)
    Pronunciation of dictionary term "tipranavir sodium"
    A drug used with another drug, ritonavir, to treat patients who are infected with HIV (the virus that causes AIDS) and have been treated with other anti-HIV drugs. Tipranavir sodium blocks the HIV virus from making copies of itself. It is a type of anti-HIV agent and a type of protease inhibitor. Also called Aptivus.
  tiragolumab: (TY-rah-GOL-yoo-mab)
    Pronunciation of dictionary term "tiragolumab"
    A substance that binds to a protein called TIGIT, which is found on T cells and some other immune cells and helps keep the body’s immune response from being too strong. TIGIT may also keep T cells from killing cancer cells. Tiragolumab blocks TIGIT, which may help the immune system kill cancer cells. It is being studied in the treatment of some types of cancer. Tiragolumab is a type of monoclonal antibody and a type of immune checkpoint inhibitor.
  tirapazamine: (TEER-uh-PA-zuh-meen)
    Pronunciation of dictionary term "tirapazamine"
    A substance that has been studied in the treatment of some types of cancer. It may cause damage to the DNA in cells that have a low level of oxygen, including cancer cells. This may make the cells easier to kill with radiation therapy and chemotherapy. Tirapazamine is a type of radiosensitizing agent and a type of chemosensitizing agent.
  tisagenlecleucel: (TIH-suh-jen-LEK-loo-sel)
    Pronunciation of dictionary term "tisagenlecleucel"
    A drug used to treat adults with certain types of B-cell non-Hodgkin lymphoma and people up to 25 years old with certain types of B-cell acute lymphoblastic leukemia. It is also being studied in the treatment of other types of cancer. Tisagenlecleucel is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Tisagenlecleucel binds to a protein called CD19, which is found on some leukemia and lymphoma cells. This helps the body’s immune system kill cancer cells. Tisagenlecleucel is a type of CAR T-cell therapy. Also called Kymriah.
    More Information
    - Tisagenlecleucel (https://www.cancer.gov/about-cancer/treatment/drugs/tisagenlecleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  tislelizumab: (TIS-leh-LIZ-yoo-mab)
    Pronunciation of dictionary term "tislelizumab"
    A drug that binds to the protein PD-L1 to help immune cells kill cancer cells better and is used to treat different types of cancer. Tislelizumab is used with alone or with other drugs to treat adults with certain types of gastric adenocarcinoma, gastroesophageal junction adenocarcinoma, or squamous cell carcinoma of the esophagus. It is also being studied in the treatment of other types of cancer. Tislelizumab may block PD-L1 and help the immune system kill cancer cells. Tislelizumab is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Tevimbra.
    More Information
    - Tislelizumab-jsgr (https://www.cancer.gov/about-cancer/treatment/drugs/tislelizumab-jsgr)
  tisotumab vedotin: (ty-SOH-too-mab veh-DOH-tin)
    Pronunciation of dictionary term "tisotumab vedotin"
    A drug used to treat adults with cervical cancer that has come back or has spread. It is used in patients whose cancer got worse during or after chemotherapy. It is also being studied in the treatment of other types of cancer. Tisotumab vedotin contains a monoclonal antibody that binds to a protein called tissue factor, which is found on some cancer cells. It also contains an anticancer drug, which may help kill cancer cells. Tisotumab vedotin may also prevent the growth of new blood vessels that tumors need to grow. It is a type of antibody-drug conjugate and a type of antiangiogenesis agent. Also called Tivdak.
    More Information
    - Tisotumab Vedotin-tftv (https://www.cancer.gov/about-cancer/treatment/drugs/tisotumabvedotin-tftv)
  tissue: (TIH-shoo)
    Pronunciation of dictionary term "tissue"
    A group or layer of cells that work together to perform a specific function.
  tissue flap reconstruction: (TIH-shoo ... REE-kun-STRUK-shun)
    Pronunciation of dictionary term "tissue flap reconstruction"
    A type of breast reconstruction in which a flap of tissue is surgically moved from another area of the body to the chest, and formed into a new breast mound.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  tissue fluid: (TIH-shoo FLOO-id)
    Pronunciation of dictionary term "tissue fluid"
    Fluid found in the spaces around cells. It comes from substances that leak out of blood capillaries (the smallest type of blood vessel). It helps bring oxygen and nutrients to cells and to remove waste products from them. As new tissue fluid is made, it replaces older fluid, which drains towards lymph vessels. When it enters the lymph vessels, it is called lymph. Also called interstitial fluid.
  tissue plasminogen activator: (TIH-shoo plaz-MIH-noh-jen AK-tih-vay-ter)
    Pronunciation of dictionary term "tissue plasminogen activator"
    An enzyme made in the body that helps dissolve blood clots. A form of this enzyme is made in the laboratory to treat heart attacks, strokes, and clots in the lungs. It is also being studied in the treatment of cancer. Tissue plasminogen activator is a type of systemic thrombolytic agent. Also called tPA.
  tissue-agnostic therapy: (TIH-shoo-ag-NAH-stik THAYR-uh-pee)
    Pronunciation of dictionary term "tissue-agnostic therapy"
    A type of therapy that uses drugs or other substances to treat cancer based on the cancer’s genetic and molecular features without regard to the cancer type or where the cancer started in the body. Tissue-agnostic therapy uses the same drug to treat all cancer types that have the genetic mutation (change) or biomarker that is targeted by the drug. It is a type of targeted therapy. Also called tumor-agnostic therapy.
  Tivdak: (TIV-dak)
    Pronunciation of dictionary term "Tivdak"
    A drug used to treat adults with cervical cancer that has come back or has spread. It is used in patients whose cancer got worse during or after chemotherapy. It is also being studied in the treatment of other types of cancer. Tivdak contains a monoclonal antibody that binds to a protein called tissue factor, which is found on some cancer cells. It also contains an anticancer drug, which may help kill cancer cells. Tivdak may also prevent the growth of new blood vessels that tumors need to grow. It is a type of antibody-drug conjugate and a type of antiangiogenesis agent. Also called tisotumab vedotin.
    More Information
    - Tisotumab Vedotin-tftv (https://www.cancer.gov/about-cancer/treatment/drugs/tisotumabvedotin-tftv)
  tivozanib hydrochloride: (ty-VOH-zuh-nib HY-droh-KLOR-ide)
    Pronunciation of dictionary term "tivozanib hydrochloride"
    A drug used to treat adults with advanced renal cell carcinoma (a type of kidney cancer). It is used in patients whose cancer has relapsed (come back) or has not gotten better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Tivozanib hydrochloride blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Tivozanib hydrochloride is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Fotivda.
    More Information
    - Tivozanib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/tivozanibhydrochloride)
  TLF: A drug being studied in the treatment of kidney cancer that has spread. It is also being studied in the treatment of other types of cancer and other conditions. TLF increases the activity of dendritic cells (a type of immune cell) to help kill cancer cells. It is a form of human lactoferrin (a protein found in milk, tears, mucus, bile, and some white blood cells) that is made in the laboratory. TLF is a type of recombinant protein and a type of immunomodulatory protein. Also called talactoferrin and talactoferrin alfa.
  TLK286: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called glutathione analogs. Also called Telcyta.
  TM: A mental technique used to promote relaxation, reduce stress, and improve quality of life. TM is the registered trademark of the Maharishi Foundation Ltd. Also called Transcendental Meditation.
  TMB: The total number of mutations (changes) found in the DNA of cancer cells. Knowing the TMB may help plan the best treatment. For example, tumors that have a high number of mutations appear to be more likely to respond to certain types of immunotherapy. TMB is being used as a type of biomarker. Also called tumor mutational burden.
  TMC6 gene: (… jeen)
    Pronunciation of dictionary term "TMC6 gene"
    A gene that makes a protein involved in forming channels through which proteins and other molecules move inside cells. Mutations (changes) in the TMC6 gene have been found in an inherited condition called epidermodysplasia verruciformis. People with this condition have a high risk of developing chronic infections with certain types of human papillomavirus (HPV) and skin cancer at an early age.
  TMC8 gene: (... jeen)
    Pronunciation of dictionary term "TMC8 gene"
    A gene that makes a protein involved in forming channels through which proteins and other molecules move inside cells. Mutations (changes) in the TMC8 gene have been found in an inherited condition called epidermodysplasia verruciformis. People with this condition have a high risk of developing chronic infections with certain types of human papillomavirus (HPV) and skin cancer at an early age.
  TMD: A bone marrow disorder that can occur in newborns who have Down syndrome. It is marked by abnormal, immature blood-forming cells in the blood and bone marrow (especially the cells involved in making platelets). The liver may also be larger than normal. TMD is caused by mutations (changes) in a gene called GATA1. TMD usually goes away on its own within the first 3 months of life. Sometimes TMD causes severe or life-threatening problems, such as bleeding problems, infection, heart, kidney, and liver failure, and abnormal build-up of fluid in the tissues that cover the organs in the body. Infants who have TMD have an increased risk of developing acute myeloid leukemia (AML) before the age of 3 years. Also called TAM, transient abnormal myelopoiesis, transient leukemia, and transient myeloproliferative disorder.
  TNBC: A type of breast cancer in which the tumor cells do not have estrogen receptors, progesterone receptors, or large amounts of HER2/neu protein on their surface. Knowing whether breast cancer is triple negative is important in planning treatment. Also called ER-negative PR-negative HER2/neu-negative breast cancer and triple-negative breast cancer.
    Triple-negative breast cancer is a type of breast cancer in which the cancer cells do not have estrogen receptors, progesterone receptors, or large amounts of HER2/neu protein on their surface.
    Drawing showing a triple-negative breast cancer cell with the estrogen receptor, progesterone receptor, and HER2 proteins crossed out with a black "X" mark. This means that the breast cancer cell does not have these proteins.
  TNF: A protein made by white blood cells in response to an antigen (substance that causes the immune system to make a specific immune response) or infection. TNF can also be made in the laboratory. It may boost a person’s immune response, and also may cause necrosis (cell death) of some types of tumor cells. TNF is being studied in the treatment of some types of cancer. It is a type of cytokine. Also called tumor necrosis factor.
  TNF-bound colloidal gold: (... bownd kuh-LOY-dul ...)
    Pronunciation of dictionary term "TNF-bound colloidal gold"
    A substance being studied in the treatment of some types of cancer. TNF-bound colloidal gold is made in the laboratory by binding a cancer-killing protein called tumor necrosis factor (TNF) to the surface of very tiny particles of gold. These TNF-gold particles may kill cancer cells without harming healthy tissue. Also called Aurimmune and colloidal gold-bound tumor necrosis factor.
  TNF-related apoptosis-inducing ligand: (… ree-LAY-ted A-pop-TOH-sis-in-DOO-sing LIH-gund)
    Pronunciation of dictionary term "TNF-related apoptosis-inducing ligand"
    A cell protein that can attach to certain molecules in some cancer cells and may kill the cells. TNF-related apoptosis-inducing ligand is being studied in the treatment of cancer. Also called Apo-2L, TRAIL, and tumor necrosis factor-related apoptosis-inducing ligand.
  TNFerade: A gene therapy product that is being studied in combination with radiation therapy in the treatment of cancer.
  TNM staging system: (… STAY-jing SIS-tem)
    Pronunciation of dictionary term "TNM staging system"
    A system to describe the amount and spread of cancer in a patient’s body, using TNM. T describes the size of the tumor and any spread of cancer into nearby tissue; N describes spread of cancer to nearby lymph nodes; and M describes metastasis (spread of cancer to other parts of the body). This system was created and is updated by the American Joint Committee on Cancer (AJCC) and the International Union Against Cancer (UICC). The TNM staging system is used to describe most types of cancer. Also called AJCC staging system.
    More Information
    - Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
  TNP-470: A substance being studied in the treatment of cancer. It may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent.
  tobacco: (tuh-BA-koh)
    Pronunciation of dictionary term "tobacco"
    A plant with leaves that have high levels of the addictive chemical nicotine. After harvesting, tobacco leaves are cured, aged, and processed in various ways. The resulting products may be smoked (in cigarettes, cigars, and pipes), applied to the gums (as dipping and chewing tobacco), or inhaled (as snuff). Cured tobacco leaves and the products made from them contain many cancer-causing chemicals, and tobacco use and exposure to secondhand tobacco smoke have been strongly linked to many types of cancer and other diseases. The scientific name of the most common tobacco plant is Nicotiana tabacum.
    More Information
    - Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco)
  tobacco tar: (tuh-BA-koh tar)
    Pronunciation of dictionary term "tobacco tar"
    A chemical substance made when tobacco is burned. Tar contains most of the cancer-causing and other harmful chemicals found in tobacco smoke. When tobacco smoke is inhaled, the tar can form a sticky layer on the inside of the lungs. This damages the lungs and may lead to lung cancer, emphysema, or other lung problems. Cigarettes and other smoked tobacco products may produce different amounts of tar, depending on how they are made. Inhaling tobacco smoke also causes other types of cancer, including cancers of the mouth and throat.
    More Information
    - Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco)
  tobacco-specific nitrosamine: (tuh-BA-koh-speh-SIH-fik ny-TROH-suh-meen)
    Pronunciation of dictionary term "tobacco-specific nitrosamine"
    A type of harmful, cancer-causing chemical found in tobacco and tobacco smoke. Tobacco-specific nitrosamines are formed when tobacco leaves are grown, cured, aged, and processed. Tobacco products can contain different amounts of tobacco-specific nitrosamines, depending on how they are made. Also called TSNA.
  tocilizumab: (toh-sih-LIH-zoo-mab)
    Pronunciation of dictionary term "tocilizumab"
    A drug used to treat adults and children aged 2 years and older with severe or life-threatening cytokine release syndrome caused by a type of immunotherapy called chimeric antigen receptor (CAR) T-cell therapy. Tocilizumab is also used to treat certain types of arthritis and a condition that causes inflammation of the lining of the arteries. It is also being studied in the treatment of other conditions. Tocilizumab binds to receptors for a protein called interleukin-6 (IL-6), which is made by white blood cells and other cells in the body. This may help lower the body’s immune response and reduce inflammation. Tocilizumab is a type of monoclonal antibody. Also called Actemra.
    More Information
    - Tocilizumab (https://www.cancer.gov/about-cancer/treatment/drugs/tocilizumab)
  tocladesine: (toh-KLA-deh-seen)
    Pronunciation of dictionary term "tocladesine"
    A substance that has been studied as an anticancer drug. It is an analog of a substance that occurs naturally in the body (cyclic adenosine monophosphate).
  Tolak: (TOL-lak)
    Pronunciation of dictionary term "Tolak"
    A drug that contains the active ingredient fluorouracil and is used as a cream to treat actinic keratosis (a skin condition that may become cancer). Tolak stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Fluorouracil (Topical) (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil-topical)
  toluene: (TOL-yoo-een)
    Pronunciation of dictionary term "toluene"
    A strong-smelling, colorless liquid used to make gasoline and other types of fuel, paint, paint thinner, fingernail polish, glue, and rubber. Being exposed to toluene may cause headache, tiredness, confusion, weakness, memory loss, nausea, loss of appetite, hearing and color vision loss, dizziness, loss of consciousness, kidney damage, and death.
  tomography: (toh-MAH-gruh-fee)
    Pronunciation of dictionary term "tomography"
    A series of detailed pictures of areas inside the body. The pictures are created by a computer linked to an x-ray machine.
  tomotherapy: (toh-mah-THAYR-uh-pee)
    Pronunciation of dictionary term "tomotherapy"
    A type of therapy in which radiation is aimed at a tumor from many different directions. The patient lays on a table and is moved through a donut-shaped machine. The radiation source in the machine rotates around the patient in a spiral pattern. Before radiation, a 3-dimensional (3-D) image of the tumor is taken. This helps doctors find the highest dose of radiation that can be used to kill tumor cells while causing less damage to nearby tissue. Tomotherapy is a type of intensity-modulated radiation therapy (IMRT). Also called helical tomotherapy.
  tonga: (TON-guh)
    Pronunciation of dictionary term "tonga"
    An herb native to islands in the South Pacific. Substances taken from the root have been used in some cultures to relieve stress, anxiety, tension, sleeplessness, and problems of menopause. Tonga may increase the effect of alcohol and of certain drugs used to treat anxiety and depression. The U.S. Food and Drug Administration advises users that tonga may cause severe liver damage. The scientific name is Piper methysticum. Also called intoxicating pepper, kava kava, rauschpfeffer, and yangona.
  tongue cancer: (tung KAN-ser)
    Pronunciation of dictionary term "tongue cancer"
    Cancer that begins in the tongue. When the cancer begins in the front two-thirds of the tongue, it is considered to be a type of oral cavity cancer; when the cancer begins in the back third of the tongue, it is considered to be a type of oropharyngeal or throat cancer.
  tonsil: (TON-sil)
    Pronunciation of dictionary term "tonsil"
    One of two small masses of lymphoid tissue on either side of the throat.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  topical: (TAH-pih-kul)
    Pronunciation of dictionary term "topical"
    On the surface of the body.
  topical chemotherapy: (TAH-pih-kul KEE-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "topical chemotherapy"
    Treatment with anticancer drugs in a lotion or cream applied to the skin.
  topoisomerase II inhibitor: (TOH-poh-i-SAH-meh-rays … in-HIH-bih-ter)
    Pronunciation of dictionary term "topoisomerase II inhibitor"
    A substance that blocks the activity of the enzyme topoisomerase II, which cuts and repairs tangled strands of DNA. Topoisomerase II is involved in cell division and growth, so blocking activity of this enzyme may kill cancer cells. Some topoisomerase II inhibitors are being used to treat cancer.
  topoisomerase II inhibitor RTA 744: (TOH-poh-i-SAH-meh-rays ... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "topoisomerase II inhibitor RTA 744"
    A substance being studied in the treatment of adult brain tumors. Topoisomerase II inhibitor RTA 744 crosses the blood-brain barrier and blocks an enzyme needed for cancer growth. It is a type of topoisomerase inhibitor. Also called RTA 744.
  topoisomerase inhibitor: (TOH-poh-i-SAH-meh-rays in-HIH-bih-ter)
    Pronunciation of dictionary term "topoisomerase inhibitor"
    A substance that blocks topoisomerases (enzymes that break and rejoin DNA strands and are needed for cells to divide and grow). Blocking these enzymes may kill cancer cells. Certain topoisomerase inhibitors are being studied in the treatment of cancer.
  Toposar: (TOH-poh-sar)
    Pronunciation of dictionary term "Toposar"
    A drug used to treat testicular and small cell lung cancers. It is also being studied in the treatment of several other types of cancer. Toposar blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of podophyllotoxin derivative and a type of topoisomerase inhibitor. Also called etoposide and Vepesid.
  topotecan: (toh-poh-TEE-kan)
    Pronunciation of dictionary term "topotecan"
    A drug used to treat certain types of ovarian cancer, small cell lung cancer, and cervical cancer. It is also being studied in the treatment of other types of cancer. Topotecan blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor. Also called Hycamtin and topotecan hydrochloride.
    More Information
    - Topotecan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/topotecanhydrochloride)
  topotecan hydrochloride: (toh-poh-TEE-kan HY-droh-KLOR-ide)
    Pronunciation of dictionary term "topotecan hydrochloride"
    A drug used alone or with other drugs to treat certain types of ovarian cancer, small cell lung cancer, and cervical cancer. It is also being studied in the treatment of other types of cancer. Topotecan hydrochloride blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of topoisomerase inhibitor and a type of camptothecin analog. Also called Hycamtin.
    More Information
    - Topotecan Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/topotecanhydrochloride)
  toremifene citrate: (tor-EH-mih-feen SIH-trayt)
    Pronunciation of dictionary term "toremifene citrate"
    A drug used to treat postmenopausal women with breast cancer that has spread to other parts of the body. It is used in patients whose cancer is estrogen receptor positive (ER+) or when it is not known if the cancer is ER+ or estrogen receptor negative (ER-). Toremifene citrate blocks the effects of the hormone estrogen in breast tissue, which may help keep breast cancer cells from growing. It is a type of selective estrogen receptor modulator (SERM). Also called Fareston.
    More Information
    - Toremifene Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/toremifene)
  toripalimab: (TOR-ih-PA-lih-mab)
    Pronunciation of dictionary term "toripalimab"
    A drug used alone or with other drugs to treat adults with certain types of nasopharyngeal cancer (a type of head and neck cancer). It is also being studied in the treatment of other types of cancer. Toripalimab binds to a protein called PD-1, which is found on T cells (a type of immune cell). Blocking this protein may help the immune system kill cancer cells. Toripalimab is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Loqtorzi.
    More Information
    - Toripalimab-tpzi (https://www.cancer.gov/about-cancer/treatment/drugs/toripalimab-tpzi)
  Torisel: (TOR-ih-sel)
    Pronunciation of dictionary term "Torisel"
    A drug used to treat advanced renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. Torisel blocks a protein called mTOR, which helps control cell division. Blocking this protein may help keep cancer cells from growing. Torisel is a type of kinase inhibitor. Also called CCI-779 and temsirolimus.
    More Information
    - Temsirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/temsirolimus)
  TORS: Surgery in which a robot with arms is used to remove cancer from hard-to-reach areas of the mouth and throat. Cameras attached to the robot give a 3-dimensional (3D) image that a surgeon can see. The surgeon guides tools at the ends of the robot arms to remove the cancer. Also called transoral robotic surgery.
  torso: (TOR-soh)
    Pronunciation of dictionary term "torso"
    The main part of the body that contains the chest, abdomen, pelvis, and back. Most of the body’s organs and the backbone are found in the torso. Also called trunk.
  tositumomab: (TAH-sih-TOO-moh-mab)
    Pronunciation of dictionary term "tositumomab"
    A drug used together with another drug to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Tositumomab binds to a protein called CD20, which is found on the surface of B cells, and may kill cancer cells. It is a type of monoclonal antibody.
  tositumomab and iodine I 131-tositumomab: (TAH-sih-TOO-moh-mab ... I-oh-dine I 131 TAH-sih-TOO-moh-mab)
    Pronunciation of dictionary term "tositumomab and iodine I 131 tositumomab"
    A combination of drugs used to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Tositumomab and iodine I 131-tositumomab is made up of a monoclonal antibody called tositumomab and a form of tositumomab that is linked to a radioactive substance called iodine I 131. It is a type of radioimmunoconjugate. Also called Bexxar and Bexxar regimen.
  total androgen blockade: (TOH-tul AN-droh-jen blah-KAYD)
    Pronunciation of dictionary term "total androgen blockade"
    Treatment used to block androgen (male hormone) activity in the body. This may be done by giving an antiandrogen drug and removing the testicles (orchiectomy) or by giving an antiandrogen drug with a gonadotropin-releasing hormone (GnRH) agonist. Total androgen blockade may stop the growth of cancer cells that need androgens to grow, and is used in the treatment of prostate cancer. Also called combined androgen blockade and complete androgen blockade.
    More Information
    - Hormone Therapy for Prostate Cancer (https://www.cancer.gov/types/prostate/prostate-hormone-therapy-fact-sheet)
  total estrogen blockade: (TOH-tul ES-truh-jin blah-KAYD)
    Pronunciation of dictionary term "total estrogen blockade"
    Therapy used to eliminate estrogen in the body. This may be done with surgery, radiation therapy, chemotherapy, or a combination of these procedures.
  total hysterectomy: (TOH-tul HIS-teh-REK-toh-mee)
    Pronunciation of dictionary term "total hysterectomy"
    Surgery to remove the uterus and the cervix. The ovaries and fallopian tubes may also be removed. A total hysterectomy may be done through the vagina (with no incisions in the abdomen) or through an incision (cut) in the abdomen. Also called complete hysterectomy and simple hysterectomy.
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  total laryngectomy: (TOH-tul LAYR-in-JEK-toh-mee)
    Pronunciation of dictionary term "total laryngectomy"
    An operation to remove all of the larynx (voice box).
  total mastectomy: (TOH-tul ma-STEK-toh-mee)
    Pronunciation of dictionary term "total mastectomy"
    Surgery to remove the whole breast, which may include the nipple, areola (the dark-colored skin around the nipple), and skin over the breast. Some of the lymph nodes under the arm may also be removed to check for cancer. Also called simple mastectomy.
    More Information
    - Breast Cancer Treatment
    Total (simple) mastectomy. The whole breast is removed. Some of the lymph nodes under the arm may also be removed.
    Total (simple) mastectomy; drawing shows removal of the whole breast and some of the lymph nodes under the arm.
  total nodal irradiation: (TOH-tul NOH-dul ih-RAY-dee-AY-shun)
    Pronunciation of dictionary term "total nodal irradiation"
    Radiation therapy to the mantle field, the spleen, the lymph nodes in the upper abdomen, and the lymph nodes in the pelvic area.
  total pancreatectomy: (TOH-tul PAN-kree-uh-TEK-toh-mee)
    Pronunciation of dictionary term "total pancreatectomy"
    Surgery to remove the entire pancreas. Part of the stomach, part of the small intestine, the common bile duct, gallbladder, spleen, and nearby lymph nodes are also removed.
  total parenteral nutrition: (TOH-tul puh-REN-teh-rul noo-TRIH-shun)
    Pronunciation of dictionary term "total parenteral nutrition"
    A form of long-term nutritional support that is given directly into the bloodstream through a catheter placed into a vein. Total parenteral nutrition bypasses the digestive system and may be given when a person is not able to eat or drink by mouth or has a disease or condition that affects their ability to absorb nutrients through the digestive system. Total parenteral nutrition is complete nutrition that provides all the calories, proteins, carbohydrates, fats, vitamins, and minerals that a person needs when they cannot digest food. Also called TPN.
  total PSA: (TOH-tul ...)
    Pronunciation of dictionary term "total PSA"
    The total amount of prostate-specific antigen (PSA) in the blood. It includes the amount of free PSA and the amount of PSA attached to other proteins.
    More Information
    - Prostate-Specific Antigen (PSA) Test (https://www.cancer.gov/types/prostate/psa-fact-sheet)
  total skin electron beam radiation therapy: (TOH-tul skin ee-LEK-tron beem RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "total skin electron beam radiation therapy"
    A type of radiation therapy using electrons that is directed at the entire surface of the body. This type of radiation goes into the outer layers of the skin, but does not go deeper into tissues and organs below the skin. Also called TSEB radiation therapy.
  total-body irradiation: (TOH-tul-BAH-dee ih-RAY-dee-AY-shun)
    Pronunciation of dictionary term "total-body irradiation"
    A type of radiation therapy that is given to the entire body. Total-body irradiation is often used with high-dose anticancer drugs to help prepare a patient for a stem cell transplant. It is done to kill any cancer cells that are left in the body and helps make room in the patient’s bone marrow for new blood stem cells to grow. Total-body irradiation may also help prevent the body’s immune system from rejecting the transplanted stem cells. Also called TBI.
  Totect: (TOH-tekt)
    Pronunciation of dictionary term "Totect"
    A drug that contains the active ingredient dexrazoxane and is used to treat severe side effects caused by certain types of anticancer drugs. It is used to reduce heart damage in women who are receiving doxorubicin for breast cancer that has spread to other parts of the body. It is also used to treat the toxic effects of an anticancer drug that leaks from a vein into surrounding tissue and causes tissue damage. Totect is a type of cardioprotective agent, a type of chemoprotective agent, and a type of topoisomerase inhibitor.
    More Information
    - Dexrazoxane Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/dexrazoxanehydrochloride)
  totipotent: (toh-TIH-puh-tent)
    Pronunciation of dictionary term "totipotent"
    Having to do with cells that are able to develop into any type of cell found in the body.
  tourniquet: (TOOR-nih-ket)
    Pronunciation of dictionary term "tourniquet"
    A device, such as a strip of cloth or a band of rubber, that is wrapped tightly around a leg or an arm to prevent the flow of blood to the leg or the arm for a period of time. A tourniquet may be used when drawing blood or to stop bleeding after an injury.
  tovorafenib: (TOH-voh-RA-feh-nib)
    Pronunciation of dictionary term "tovorafenib"
    A drug used to treat children aged 6 months and older with low-grade glioma (a type of brain tumor) that has certain mutations (changes) in the BRAF gene. It is used in patients whose tumor came back or did not get better after treatment with other therapy. It is also being studied in the treatment of other types of cancer. Tovorafenib blocks certain proteins made by the mutated BRAF gene, which may help keep tumor cells from growing. It is a type of kinase inhibitor. Also called Ojemda.
    More Information
    - Tovorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/tovorafenib)
  toxemia: (tok-SEE-mee-uh)
    Pronunciation of dictionary term "toxemia"
    Disease caused by the spread of bacteria and their toxins in the bloodstream. Also called blood poisoning and septicemia.
  toxic: (TOK-sik)
    Pronunciation of dictionary term "toxic"
    Having to do with poison or something harmful to the body. Toxic substances usually cause unwanted side effects.
  toxicant: (TOK-sih-kunt)
    Pronunciation of dictionary term "toxicant"
    A poison that is made by humans or that is put into the environment by human activities. Many pesticides are toxicants.
  toxicity: (tok-SIH-sih-tee)
    Pronunciation of dictionary term "toxicity"
    The extent to which something is poisonous or harmful.
  toxicology: (TOK-sih-KAH-loh-jee)
    Pronunciation of dictionary term "toxicology"
    The study of poisons, including the source, effect, and treatment of poisoning. It is a branch of pharmacology (the study of drugs).
  toxin: (TOK-sin)
    Pronunciation of dictionary term "toxin"
    A poison made by certain bacteria, plants, or animals, including insects.
  TP-38 immunotoxin: (... IH-myoo-noh-TOK-sin)
    Pronunciation of dictionary term "TP-38 immunotoxin"
    A substance being studied in the treatment of brain tumors. It combines a protein that binds to certain tumor cells with a bacterial toxin that kills tumor cells.
  TP53 gene: (... jeen)
    Pronunciation of dictionary term "TP53 gene"
    A gene that makes a protein that is found inside the nucleus of cells and plays a key role in controlling cell division and cell death. Mutations (changes) in the TP53 gene may cause cancer cells to grow and spread in the body. These changes have been found in a genetic condition called Li-Fraumeni syndrome and in many types of cancer. The TP53 gene is a type of tumor suppressor gene. Also called p53 gene and tumor protein p53 gene.
  tPA: An enzyme made in the body that helps dissolve blood clots. A form of this enzyme is made in the laboratory to treat heart attacks, strokes, and clots in the lungs. It is also being studied in the treatment of cancer. tPA is a type of systemic thrombolytic agent. Also called tissue plasminogen activator.
  TPA: A substance being studied in the treatment of leukemias and lymphomas. It is also being studied in the treatment of other types of cancer. TPA affects many cell actions and may cause tumor cells to die. It is a type of phorbol ester. Also called 12-O-tetradecanoylphorbol-13-acetate and tetradecanoylphorbol acetate.
  TPF: An abbreviation for a chemotherapy combination used to treat certain types of head and neck cancer and stomach cancer. It includes the drugs docetaxel (Taxotere), cisplatin (Platinol), and fluorouracil. Also called DCF, docetaxel-cisplatin-fluorouracil, Taxotere-Platinol-fluorouracil, and TPF regimen.
    More Information
    - TPF (https://www.cancer.gov/about-cancer/treatment/drugs/TPF)
  TPF regimen: (… REH-jih-men)
    Pronunciation of dictionary term "TPF regimen"
    An abbreviation for a chemotherapy combination used to treat certain types of head and neck cancer and stomach cancer. It includes the drugs docetaxel (Taxotere), cisplatin (Platinol), and fluorouracil. Also called DCF, docetaxel-cisplatin-fluorouracil, Taxotere-Platinol-fluorouracil, and TPF.
    More Information
    - TPF (https://www.cancer.gov/about-cancer/treatment/drugs/TPF)
  TPN: A form of long-term nutritional support that is given directly into the bloodstream through a catheter placed into a vein. TPN bypasses the digestive system and may be given when a person is not able to eat or drink by mouth or has a disease or condition that affects their ability to absorb nutrients through the digestive system. TPN is complete nutrition that provides all the calories, proteins, carbohydrates, fats, vitamins, and minerals that a person needs when they cannot digest food. Also called total parenteral nutrition.
  TPO: A substance made by the body that helps make blood cells, especially platelets. A form of TPO made in the laboratory is called recombinant human TPO and rHu TPO. TPO is being studied as a way to increase the number of platelets in cancer patients receiving chemotherapy. Also called thrombopoietin.
  trabectedin: (truh-BEK-teh-din)
    Pronunciation of dictionary term "trabectedin"
    A drug used to treat liposarcoma and leiomyosarcoma (types of soft tissue sarcoma) that cannot be removed by surgery or have spread to other parts of the body. It is used in patients who have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Trabectedin may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called ecteinascidin, ET 743, and Yondelis.
    More Information
    - Trabectedin (https://www.cancer.gov/about-cancer/treatment/drugs/trabectedin)
  trabecular cancer: (truh-BEH-kyoo-ler KAN-ser)
    Pronunciation of dictionary term "trabecular cancer"
    A rare type of cancer that forms on or just beneath the skin, usually in parts of the body that have been exposed to the sun. It is most common in older people and in people with weakened immune systems. Also called Merkel cell cancer, Merkel cell carcinoma, and neuroendocrine carcinoma of the skin.
    More Information
    - Merkel Cell Carcinoma Treatment
    Anatomy of the skin showing the epidermis, dermis, and subcutaneous tissue. Merkel cells are in the layer of basal cells at the deepest part of the epidermis and are connected to nerves.
    Anatomy of the skin with Merkel cells; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the epidermis with Merkel cells above the dermis with a vein and artery. Nerves are connected to Merkel cells.
  trace element: (trays EH-leh-ment)
    Pronunciation of dictionary term "trace element"
    An element found in very small amounts in a given substance. Organisms need certain trace elements to survive.
  tracer: (TRAY-ser)
    Pronunciation of dictionary term "tracer"
    A substance (such as a radioisotope) used in imaging procedures.
  trach tube: (trake...)
    Pronunciation of dictionary term "trach tube"
    A 2-inch- to 3-inch-long curved metal or plastic tube placed in a surgically created opening (tracheostomy) in the windpipe to keep it open. Also called tracheostomy tube.
  trachea: (TRAY-kee-uh)
    Pronunciation of dictionary term "trachea"
    The airway that leads from the larynx (voice box) to the bronchi (large airways that lead to the lungs). Also called windpipe.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  tracheal carina: (TRAY-kee-ul kuh-RY-nuh)
    Pronunciation of dictionary term "tracheal carina"
    A ridge at the base of the trachea (windpipe) that separates the openings of the right and left main bronchi (the large air passages that lead from the trachea to the lungs). Also called carina of trachea.
  trachelectomy: (TRAY-kee-LEK-toh-mee)
    Pronunciation of dictionary term "trachelectomy"
    Surgery to remove the cervix. There are two types of trachelectomy: simple trachelectomy and radical trachelectomy. During a simple trachelectomy, only the cervix is removed. During a radical trachelectomy, the cervix, nearby tissue, and the upper part of the vagina are removed. Lymph nodes in the pelvis may also be removed. Because the uterus, fallopian tubes, and ovaries are not removed, a trachelectomy may be done to treat a person with early-stage cervical cancer who wants to become pregnant in the future. Also called cervicectomy.
  tracheobronchial tumor: (TRAY-kee-oh-BRON-kee-ul TOO-mer)
    Pronunciation of dictionary term "tracheobronchial tumor"
    A tumor that begins in cells that line the trachea (windpipe) or bronchi (large airways of the lung). Tracheobronchial tumors are rare and can occur in both children and adults. They are usually benign (not cancer) in children and malignant (cancer) in adults. Signs and symptoms include dry cough, wheezing, trouble breathing, coughing or spitting up blood, frequent lung infections (such as pneumonia), feeling very tired, loss of appetite, weight loss, hoarseness, and trouble swallowing. The most common types of tracheobronchial tumors include squamous cell carcinoma, adenoid cystic carcinoma, carcinoid tumors, chondromas, hemangiomas, and papillomas.
    Tracheobronchial tumors form in the inside lining of the trachea or bronchi (large airways of the lung). Tracheobronchial tumors are rare and can occur in both children and adults.
    Drawing shows areas of the body where tracheobronchial tumors may form, including the trachea and the bronchi (large airways of the lung).
  tracheoesophageal puncture: (TRAY-kee-oh-ee-SAH-fuh-JEE-ul PUNK-cher)
    Pronunciation of dictionary term "tracheoesophageal puncture"
    A small opening made by a surgeon between the esophagus and the trachea. A valve keeps food out of the trachea but lets air into the esophagus for esophageal speech.
  tracheostomy: (TRAY-kee-OS-toh-mee)
    Pronunciation of dictionary term "tracheostomy"
    Surgery to create an opening (stoma) into the windpipe. The opening itself may also be called a tracheostomy.
  tracheostomy button: (TRAY-kee-OS-toh-mee...)
    Pronunciation of dictionary term "tracheostomy button"
    A 0.5-inch- to 1.5-inch-long plastic tube placed in a surgically created opening (tracheostomy) in the windpipe to keep it open.
  tracheostomy tube: (TRAY-kee-OS-toh-mee...)
    Pronunciation of dictionary term "tracheostomy tube"
    A 2-inch- to 3-inch-long curved metal or plastic tube placed in a surgically created opening (tracheostomy) in the windpipe to keep it open. Also called trach tube.
  tradition: (truh-DIH-shun)
    Pronunciation of dictionary term "tradition"
    A belief or behavior that is passed from generation to generation in a family, a culture, or a religion.
  traditional acupuncture: (truh-DIH-shuh-nul AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "traditional acupuncture"
    An ancient form of acupuncture based on the principle that there are five universal elements (wood, fire, earth, metal, and water) that affect a person's emotions, personality, health, and response to treatment. Each person is affected by one element more than the others. Also called five element acupuncture.
  Traditional Chinese Medicine: (truh-DIH-shuh-nul chy-NEEZ MEH-dih-sin)
    Pronunciation of dictionary term "traditional Chinese medicine"
    A medical system that has been used for thousands of years to prevent, diagnose, and treat disease. It is based on the belief that qi (the body's vital energy) flows along meridians (channels) in the body and keeps a person’s spiritual, emotional, mental, and physical health in balance. Traditional Chinese medicine aims to restore the body’s balance and harmony between the natural opposing forces of yin and yang, which can block qi and cause disease. Traditional Chinese medicine includes acupuncture, diet, herbal therapy, meditation, physical exercise, and massage. Also called Oriental medicine and TCM.
  traditional surrogate: (truh-DIH-shuh-nul SER-uh-gut)
    Pronunciation of dictionary term "traditional surrogate"
    A woman who carries and gives birth to a baby for a person who is not able to have children. The woman who is the traditional surrogate can either get pregnant by artificial insemination with sperm from a sperm donor, or her eggs can be fertilized in the laboratory with sperm from a sperm donor to make an embryo. The embryo is implanted in the uterus of the traditional surrogate, who carries the baby until birth. The traditional surrogate is genetically related to the baby and is the biological mother.
  TRAIL: (trayl)
    Pronunciation of dictionary term "TRAIL"
    A cell protein that can attach to certain molecules in some cancer cells and may kill the cells. TRAIL is being studied in the treatment of cancer. Also called Apo-2L, TNF-related apoptosis-inducing ligand, and tumor necrosis factor-related apoptosis-inducing ligand.
  TRAIL receptor 1: (… reh-SEP-ter 1)
    Pronunciation of dictionary term "TRAIL receptor 1"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of TRAIL receptor 1 on cancer cells may kill more cells. Also called death receptor 4, DR4, TRAIL-R1, and tumor necrosis factor receptor superfamily member 10A.
  TRAIL receptor 2: (… reh-SEP-ter 2)
    Pronunciation of dictionary term "TRAIL receptor 2"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of TRAIL receptor 2 on cancer cells may kill more cells. Also called death receptor 5, DR5, TRAIL-R2, and tumor necrosis factor receptor superfamily member 10B.
  TRAIL-R1: (trayl ...)
    Pronunciation of dictionary term "TRAIL-R1"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of TRAIL-R1 on cancer cells may kill more cells. Also called death receptor 4, DR4, TRAIL receptor 1, and tumor necrosis factor receptor superfamily member 10A.
  TRAIL-R2: (trayl …)
    Pronunciation of dictionary term "TRAIL-R2"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of TRAIL-R2 on cancer cells may kill more cells. Also called death receptor 5, DR5, TRAIL receptor 2, and tumor necrosis factor receptor superfamily member 10B.
  TRAM flap: (… flap)
    Pronunciation of dictionary term "TRAM flap"
    A type of surgery used to rebuild the shape of the breast after a mastectomy. A muscle in the lower abdomen called the rectus abdominis, along with skin, fat, and blood vessels, is moved from the lower abdomen to the chest. This is usually done by passing the muscle tissue and blood vessels through a tunnel under the skin to the chest. A TRAM flap forms a natural-looking breast, so the patient usually does not need a breast implant. It is a type of breast reconstruction. Also called transverse rectus abdominis myocutaneous flap.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  tramadol hydrochloride: (TRA-muh-dol HY-droh-KLOR-ide)
    Pronunciation of dictionary term "tramadol hydrochloride"
    A drug used to treat moderate to severe pain in adults. It binds to opioid receptors in the central nervous system. Tramadol hydrochloride is a type of analgesic agent and a type of opioid. Also called Ultram.
  trametinib dimethyl sulfoxide: (truh-MEH-tih-nib dy-MEH-thul sul-FOK-side)
    Pronunciation of dictionary term "trametinib dimethyl sulfoxide"
    A drug used alone or with dabrafenib to treat low-grade glioma (a type of brain tumor) in children aged 1 year and older and certain types of anaplastic thyroid cancer, non-small cell lung cancer, melanoma, and other solid tumors that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Trametinib dimethyl sulfoxide blocks proteins called MEK1 and MEK2, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called Mekinist.
    More Information
    - Trametinib Dimethyl Sulfoxide (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib)
  tranquilizer: (TRANG-kwih-LY-zer)
    Pronunciation of dictionary term "tranquilizer"
    A drug that calms and soothes, and reduces stress and tension. Tranquilizers are used to treat anxiety and insomnia.
  trans fat: (tranz fat)
    Pronunciation of dictionary term "trans fat"
    A type of fat that has certain chemical properties and is usually found in processed foods such as baked goods, snack foods, fried foods, shortening, margarine, and certain vegetable oils. Eating trans fat increases blood cholesterol levels and the risk of heart disease.
  transabdominal ultrasound: (TRANZ-ab-DAH-mih-nul UL-truh-sownd)
    Pronunciation of dictionary term "transabdominal ultrasound"
    A procedure used to examine the organs in the abdomen. An ultrasound transducer (probe) is pressed firmly against the skin of the abdomen. High-energy sound waves from the transducer bounce off tissues and create echoes. The echoes are sent to a computer, which makes a picture called a sonogram. Also called abdominal ultrasound.
    Abdominal ultrasound. An ultrasound transducer connected to a computer is passed over the surface of the abdomen. The ultrasound transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
    Abdominal ultrasound; drawing shows a woman on an exam table during an abdominal ultrasound procedure. A diagnostic sonographer (a person trained to perform ultrasound procedures) is shown passing a transducer (a device that makes sound waves that bounce off tissues inside the body) over the surface of the patient’s abdomen. A computer screen shows a sonogram (computer picture).
  transaminase: (tranz-A-mih-nays)
    Pronunciation of dictionary term "transaminase"
    A type of enzyme that causes the transfer of a chemical substance called an amino group from one molecule to another. Transaminases are involved in many processes in the body, such as making amino acids.
  transarterial chemoembolization: (tranz-ar-TEER-ee-ul KEE-moh-EM-boh-lih-ZAY-shun)
    Pronunciation of dictionary term "transarterial chemoembolization"
    A procedure in which the blood supply to a tumor is blocked after anticancer drugs are given in blood vessels near the tumor. Sometimes, the anticancer drugs are attached to small beads that are injected into an artery that feeds the tumor. The beads block blood flow to the tumor as they release the drug. This allows a higher amount of drug to reach the tumor for a longer period of time, which may kill more cancer cells. It also causes fewer side effects because very little of the drug reaches other parts of the body. Transarterial chemoembolization is used to treat liver cancer. Also called chemoembolization and TACE.
  transarterial embolization: (tranz-ar-TEER-ee-ul EM-boh-lih-ZAY-shun)
    Pronunciation of dictionary term "transarterial embolization"
    A procedure in which the blood supply to a tumor or an abnormal area of tissue is blocked. During transarterial embolization, a small incision (cut) is made in the inner thigh and a catheter (thin, flexible tube) is inserted and guided into an artery near the tumor or abnormal tissue. Once the catheter is in place, small particles made of tiny gelatin sponges or beads are injected. This blocks the artery and stops the flow of blood to the tumor or abnormal area of tissue. Transarterial embolization is used to treat some types of liver cancer, kidney cancer, and neuroendocrine tumors. It may also be used to treat uterine fibroids, aneurysms, and other conditions. Also called arterial embolization and TAE.
  Transcendental Meditation: (TRAN-sen-DEN-tul MEH-dih-TAY-shun)
    Pronunciation of dictionary term "Transcendental Meditation"
    A mental technique used to promote relaxation, reduce stress, and improve quality of life. Transcendental Meditation is the registered trademark of the Maharishi Foundation Ltd. Also called TM.
  transcription: (tran-SKRIP-shun)
    Pronunciation of dictionary term "transcription"
    In biology, the process by which a cell makes an RNA copy of a piece of DNA. This RNA copy, called messenger RNA (mRNA), carries the genetic information needed to make proteins in a cell. It carries the information from the DNA in the nucleus of the cell to the cytoplasm, where proteins are made.
    More Information
    - Transcription (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Transcription)
    Transcription and translation are processes a cell uses to make all proteins the body needs to function from information stored in the sequence of bases in DNA. The four bases (C, A, T/U, and G in the figure) are the building blocks of DNA and RNA. During transcription, a piece of DNA that codes for a specific gene is copied into messenger RNA (mRNA) in the nucleus of the cell. The mRNA then carries the genetic information from the DNA to the cytoplasm, where translation occurs. During translation, proteins are made using the information stored in the mRNA sequence. The mRNA attaches to a structure called a ribosome that can read the genetic information. As the mRNA passes through the ribosome, another type of RNA called transfer RNA (tRNA) carries a protein building block called an amino acid to the ribosome. The tRNA carrying the amino acid binds to a matching sequence in the mRNA. As each tRNA binds to the mRNA strand, the amino acid it carried joins with the other amino acids to form a chain of amino acids. Once all of the amino acids coded for in the piece of mRNA have been linked, the completed protein is released from the ribosome.
    Transcription and translation; the top part of the drawing shows transcription occurring in the nucleus of a cell: a piece of DNA that codes for a specific gene is copied into mRNA; bases in the copied DNA, adenine (A), cytosine (C), guanine (G), and thymine (T), form specific pairs with the bases in the mRNA, except adenine (A) in the DNA pairs with uracil (U) in the mRNA (also shown is a sequence of 3 bases called a codon in the mRNA); the mRNA then carries the genetic information from the DNA to the cytoplasm. The bottom part of the drawing shows translation occurring in the cytoplasm of a cell: the mRNA attaches to and passes through the ribosome; tRNA carries an amino acid to the ribosome, where it binds to a matching codon sequence in the mRNA; the amino acid joins with the other amino acids to form a growing protein chain; the completed protein is then released from the ribosome.
    Transcription and translation are processes a cell uses to make all proteins the body needs to function from information stored in the sequence of bases in DNA. The four bases (C, A, T/U, and G in the figure) are the building blocks of DNA and RNA. During transcription, a piece of DNA that codes for a specific gene is copied into messenger RNA (mRNA) in the nucleus of the cell. The mRNA then carries the genetic information from the DNA to the cytoplasm, where translation occurs. During translation, proteins are made using the information stored in the mRNA sequence. The mRNA attaches to a structure called a ribosome that can read the genetic information. As the mRNA passes through the ribosome, another type of RNA called transfer RNA (tRNA) carries a protein building block called an amino acid to the ribosome. The tRNA carrying the amino acid binds to a matching sequence in the mRNA. As each tRNA binds to the mRNA strand, the amino acid it carried joins with the other amino acids to form a chain of amino acids. Once all of the amino acids coded for in the piece of mRNA have been linked, the completed protein is released from the ribosome.
    Transcription and translation; the top part of the drawing shows transcription occurring in the nucleus of a cell: a piece of DNA that codes for a specific gene is copied into mRNA; bases in the copied DNA, adenine (A), cytosine (C), guanine (G), and thymine (T), form specific pairs with the bases in the mRNA, except adenine (A) in the DNA pairs with uracil (U) in the mRNA (also shown is a sequence of 3 bases called a codon in the mRNA); the mRNA then carries the genetic information from the DNA to the cytoplasm. The bottom part of the drawing shows translation occurring in the cytoplasm of a cell: the mRNA attaches to and passes through the ribosome; tRNA carries an amino acid to the ribosome, where it binds to a matching codon sequence in the mRNA; the amino acid joins with the other amino acids to form a growing protein chain; the completed protein is then released from the ribosome.
  transcription factor: (tran-SKRIP-shun FAK-ter)
    Pronunciation of dictionary term "transcription factor"
    One of a group of proteins that play an important role in controlling the activity of genes. Transcription factors help control when and how genes are turned on or off in a cell by binding to nearby DNA and to other DNA-associated proteins. This affects the production of RNA, which then affects the production of proteins and their many important cell functions. Mutations and other changes in transcription factor genes may cause abnormal transcription factor proteins to be made. These abnormal proteins may be too active or found in higher-than-normal amounts on or in some types of cancer cells, which may cause the cancer cells to grow. Drugs that block transcription factor proteins and proteins associated with them are being studied in the treatment of some types of cancer.
  transcriptomics: (trans-krip-TOH-mix)
    Pronunciation of dictionary term "transcriptomics"
    The study of all RNA molecules in a cell. RNA is copied from pieces of DNA and contains information to make proteins and perform other important functions in the cell. Transcriptomics is used to learn more about how genes are turned on in different types of cells and how this may help cause certain diseases, such as cancer.
  transcutaneous electrical nerve stimulation: (tranz-kyoo-TAY-nee-us ee-LEK-trih-kul nerv STIM-yoo-LAY-shun)
    Pronunciation of dictionary term "transcutaneous electrical nerve stimulation"
    A procedure in which mild electric currents are applied to some areas of the skin. Also called TENS.
  transdermal: (tranz-DER-mul)
    Pronunciation of dictionary term "transdermal"
    Absorbed through the unbroken skin.
  transfer factor: (TRANZ-fer FAK-ter)
    Pronunciation of dictionary term "transfer factor"
    A substance made by some white blood cells. Transfer factor from one person’s white blood cells may be able to cause a specific immune response when injected into the skin of another person.
  transferrin-CRM107: (tranz-FAYR-in...)
    Pronunciation of dictionary term "transferrin-CRM107"
    A substance being studied in the treatment of brain tumors. Transferrin-CRM107 is made by linking a diphtheria toxin to transferrin, a protein that binds to fast growing cells, such as tumor cells. The diphtheria toxin then kills the tumor cells. Transferrin-CRM107 is a type of immunotoxin.
  transformation: (TRANZ-for-MAY-shun)
    Pronunciation of dictionary term "transformation"
    In medicine, the change that a normal cell undergoes as it becomes malignant.
  transformation zone: (TRANZ-for-MAY-shun zone)
    Pronunciation of dictionary term "transformation zone"
    The area around the opening of the cervix where the endocervix (inner part) and ectocervix (outer part) come together. This area contains both glandular cells (cells that make mucus) from the endocervix and squamous cells (thin, skin-like cells) from the ectocervix. Most abnormal cell changes and most cervical cancers begin in the squamous cells of the transformation zone. Also called squamocolumnar junction.
    Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.
    Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.
  transfusion: (tranz-FYOO-zhun)
    Pronunciation of dictionary term "transfusion"
    A procedure in which whole blood or parts of blood are put into a patient’s bloodstream through a vein. The blood may be donated by another person or it may have been taken from the patient and stored until needed. Also called blood transfusion.
    Blood transfusion. A patient is given blood through an intravenous (IV) catheter in the arm. The blood may be donated by another person, or it may have been taken from the patient and stored until needed.
    Blood transfusion; drawing of red blood cells being given to a patient through an intravenous (IV) catheter in the arm.
  transgender: (tranz-JEN-der)
    Pronunciation of dictionary term "transgender"
    A term that describes a person whose gender identity is different from the sex they were assigned at birth. For example, a transgender person who was assigned female at birth may identify as male, a combination of male and female, or neither.
  transgenic mice: (trans-JEH-nik...)
    Pronunciation of dictionary term "transgenic mice"
    Mice that have had DNA from another source put into their DNA. The foreign DNA is put into the nucleus of a fertilized mouse egg. The new DNA becomes part of every cell and tissue of the mouse. These mice are used in the laboratory to study diseases.
  transient abnormal myelopoiesis: (TRAN-zee-ent ab-NOR-mul MY-eh-loh-poy-EE-sis)
    Pronunciation of dictionary term "transient abnormal myelopoiesis"
    A bone marrow disorder that can occur in newborns who have Down syndrome. It is marked by abnormal, immature blood-forming cells in the blood and bone marrow (especially the cells involved in making platelets). The liver may also be larger than normal. Transient abnormal myelopoiesis is caused by mutations (changes) in a gene called GATA1. Transient abnormal myelopoiesis usually goes away on its own within the first 3 months of life. Sometimes transient abnormal myelopoiesis causes severe or life-threatening problems, such as bleeding problems, infection, heart, kidney, and liver failure, and abnormal build-up of fluid in the tissues that cover the organs in the body. Infants who have transient abnormal myelopoiesis have an increased risk of developing acute myeloid leukemia (AML) before the age of 3 years. Also called TAM, TMD, transient leukemia, and transient myeloproliferative disorder.
  transient leukemia: (TRAN-zee-ent loo-KEE-mee-uh)
    Pronunciation of dictionary term "transient leukemia"
    A bone marrow disorder that can occur in newborns who have Down syndrome. It is marked by abnormal, immature blood-forming cells in the blood and bone marrow (especially the cells involved in making platelets). The liver may also be larger than normal. Transient leukemia is caused by mutations (changes) in a gene called GATA1. Transient leukemia usually goes away on its own within the first 3 months of life. Sometimes transient leukemia causes severe or life-threatening problems, such as bleeding problems, infection, heart, kidney, and liver failure, and abnormal build-up of fluid in the tissues that cover the organs in the body. Infants who have transient leukemia have an increased risk of developing acute myeloid leukemia (AML) before the age of 3 years. Also called TAM, TMD, transient abnormal myelopoiesis, and transient myeloproliferative disorder.
  transient myeloproliferative disorder: (TRAN-zee-ent MY-eh-loh-proh-LIH-feh-ruh-tiv dis-OR-der)
    Pronunciation of dictionary term "transient myeloproliferative disorder"
    A bone marrow disorder that can occur in newborns who have Down syndrome. It is marked by abnormal, immature blood-forming cells in the blood and bone marrow (especially the cells involved in making platelets). The liver may also be larger than normal. Transient myeloproliferative disorder is caused by mutations (changes) in a gene called GATA1. Transient myeloproliferative disorder usually goes away on its own within the first 3 months of life. Sometimes transient myeloproliferative disorder causes severe or life-threatening problems, such as bleeding problems, infection, heart, kidney, and liver failure, and abnormal build-up of fluid in the tissues that cover the organs in the body. Infants who have transient myeloproliferative disorder have an increased risk of developing acute myeloid leukemia (AML) before the age of 3 years. Also called TAM, TMD, transient abnormal myelopoiesis, and transient leukemia.
  transient receptor potential cation channel, subfamily V, member 6: (TRAN-zee-ent reh-SEP-ter poh-TEN-shul KA-ty-on CHA-nul sub-FA-mih-lee …)
    Pronunciation of dictionary term "transient receptor potential cation channel, subfamily V, member 6"
    A protein found in cell membranes that moves calcium into cells. Levels of transient receptor potential cation channel, subfamily V, member 6 are lower than normal in patients who don’t have enough vitamin D. High levels of the protein may be found in breast cancer tissue. It is a type of calcium channel protein. Also called TRPV6.
  transitional care: (tran-ZIH-shuh-nul kayr)
    Pronunciation of dictionary term "transitional care"
    Support given to patients when they move from one phase of disease or treatment to another, such as from hospital care to home care. It involves helping patients and families with medical, practical, and emotional needs as they adjust to different levels and goals of care.
  transitional cell: (tran-ZIH-shuh-nul sel)
    Pronunciation of dictionary term "transitional cell"
    A cell that varies in shape depending on whether the tissue is being stretched. Transitional cells may be stretched without breaking apart. They line hollow organs such as the bladder.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  transitional cell cancer: (tran-ZIH-shuh-nul sel KAN-ser)
    Pronunciation of dictionary term "transitional cell cancer"
    Cancer that begins in cells called urothelial cells that line the urethra, bladder, ureters, renal pelvis, and some other organs. Urothelial cells are also called transitional cells. These cells can change shape and stretch without breaking apart. Also called urothelial cancer.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  translation: (trans-LAY-shun)
    Pronunciation of dictionary term "translation"
    In biology, the process by which a cell makes proteins using the genetic information carried in messenger RNA (mRNA). The mRNA is made by copying DNA, and the information it carries tells the cell how to link amino acids together to form proteins.
    More Information
    - Translation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Translation)
    Transcription and translation are processes a cell uses to make all proteins the body needs to function from information stored in the sequence of bases in DNA. The four bases (C, A, T/U, and G in the figure) are the building blocks of DNA and RNA. During transcription, a piece of DNA that codes for a specific gene is copied into messenger RNA (mRNA) in the nucleus of the cell. The mRNA then carries the genetic information from the DNA to the cytoplasm, where translation occurs. During translation, proteins are made using the information stored in the mRNA sequence. The mRNA attaches to a structure called a ribosome that can read the genetic information. As the mRNA passes through the ribosome, another type of RNA called transfer RNA (tRNA) carries a protein building block called an amino acid to the ribosome. The tRNA carrying the amino acid binds to a matching sequence in the mRNA. As each tRNA binds to the mRNA strand, the amino acid it carried joins with the other amino acids to form a chain of amino acids. Once all of the amino acids coded for in the piece of mRNA have been linked, the completed protein is released from the ribosome.
    Transcription and translation; the top part of the drawing shows transcription occurring in the nucleus of a cell: a piece of DNA that codes for a specific gene is copied into mRNA; bases in the copied DNA, adenine (A), cytosine (C), guanine (G), and thymine (T), form specific pairs with the bases in the mRNA, except adenine (A) in the DNA pairs with uracil (U) in the mRNA (also shown is a sequence of 3 bases called a codon in the mRNA); the mRNA then carries the genetic information from the DNA to the cytoplasm. The bottom part of the drawing shows translation occurring in the cytoplasm of a cell: the mRNA attaches to and passes through the ribosome; tRNA carries an amino acid to the ribosome, where it binds to a matching codon sequence in the mRNA; the amino acid joins with the other amino acids to form a growing protein chain; the completed protein is then released from the ribosome.
    Transcription and translation are processes a cell uses to make all proteins the body needs to function from information stored in the sequence of bases in DNA. The four bases (C, A, T/U, and G in the figure) are the building blocks of DNA and RNA. During transcription, a piece of DNA that codes for a specific gene is copied into messenger RNA (mRNA) in the nucleus of the cell. The mRNA then carries the genetic information from the DNA to the cytoplasm, where translation occurs. During translation, proteins are made using the information stored in the mRNA sequence. The mRNA attaches to a structure called a ribosome that can read the genetic information. As the mRNA passes through the ribosome, another type of RNA called transfer RNA (tRNA) carries a protein building block called an amino acid to the ribosome. The tRNA carrying the amino acid binds to a matching sequence in the mRNA. As each tRNA binds to the mRNA strand, the amino acid it carried joins with the other amino acids to form a chain of amino acids. Once all of the amino acids coded for in the piece of mRNA have been linked, the completed protein is released from the ribosome.
    Transcription and translation; the top part of the drawing shows transcription occurring in the nucleus of a cell: a piece of DNA that codes for a specific gene is copied into mRNA; bases in the copied DNA, adenine (A), cytosine (C), guanine (G), and thymine (T), form specific pairs with the bases in the mRNA, except adenine (A) in the DNA pairs with uracil (U) in the mRNA (also shown is a sequence of 3 bases called a codon in the mRNA); the mRNA then carries the genetic information from the DNA to the cytoplasm. The bottom part of the drawing shows translation occurring in the cytoplasm of a cell: the mRNA attaches to and passes through the ribosome; tRNA carries an amino acid to the ribosome, where it binds to a matching codon sequence in the mRNA; the amino acid joins with the other amino acids to form a growing protein chain; the completed protein is then released from the ribosome.
  translational research: (trans-LAY-shuh-nul REE-serch)
    Pronunciation of dictionary term "translational research"
    A term used to describe the process by which the results of research done in the laboratory are used to develop new ways to diagnose and treat disease.
  translocation: (TRANZ-loh-KAY-shun)
    Pronunciation of dictionary term "translocation"
    A genetic change in which a piece of one chromosome breaks off and attaches to another chromosome. Sometimes pieces from two different chromosomes will trade places with each other. Translocations may lead to medical problems such as leukemia, breast cancer, schizophrenia, muscular dystrophy, and Down syndrome.
    More Information
    - Translocation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Translocation)
  transoral robotic surgery: (TRANZ-or-ul roh-BAH-tik SER-juh-ree)
    Pronunciation of dictionary term "transoral robotic surgery"
    Surgery in which a robot with arms is used to remove cancer from hard-to-reach areas of the mouth and throat. Cameras attached to the robot give a 3-dimensional (3D) image that a surgeon can see. The surgeon guides tools at the ends of the robot arms to remove the cancer. Also called TORS.
  transperineal biopsy: (TRANZ-PAYR-ih-NEE-ul BY-op-see)
    Pronunciation of dictionary term "transperineal biopsy"
    A procedure in which a sample of tissue is removed from the prostate for examination under a microscope. The sample is removed with a thin needle that is inserted through the skin between the scrotum and rectum and into the prostate.
  transperineal template-guided prostate mapping biopsy: (TRANZ-payr-ih-NEE-ul TEM-plut-GY-ded PROS-tayt MA-ping BY-op-see)
    Pronunciation of dictionary term "transperineal template-guided prostate mapping biopsy"
    A procedure being studied in the diagnosis of prostate cancer and in planning prostate cancer treatment. Ultrasound is used to create a map of the prostate so the whole prostate gland can be seen in three dimensions and divided into 24 areas. Needles are then inserted through a template into each of the 24 areas and tissue is removed to be checked under a microscope. Also called TTMB.
  transplant surgeon: (TRANZ-plant SER-jun)
    Pronunciation of dictionary term "transplant surgeon"
    A surgeon who has special training in transplantation surgery. The surgeon replaces a patient's organ with an organ from another person.
  transplantation: (tranz-plan-TAY-shun)
    Pronunciation of dictionary term "transplantation"
    A surgical procedure in which tissue or an organ is transferred from one area of a person’s body to another area, or from one person (the donor) to another person (the recipient).
  transrectal biopsy: (tranz-REK-tul BY-op-see)
    Pronunciation of dictionary term "transrectal biopsy"
    A procedure in which a sample of tissue is removed from the prostate using a thin needle that is inserted through the rectum and into the prostate. Transrectal ultrasound (TRUS) is usually used to guide the needle. The sample is examined under a microscope to see if it contains cancer.
    Transrectal biopsy. An ultrasound probe is inserted into the rectum to show where the tumor is. Then a needle is inserted through the rectum into the prostate to remove tissue from the prostate.
    Transrectal biopsy; drawing shows a side view of the prostate, bladder, and rectum. Drawing also shows an ultrasound probe with a needle inserted into the rectum to remove a tissue sample from the prostate.
  transrectal ultrasound: (tranz-REK-tul UL-truh-sownd)
    Pronunciation of dictionary term "transrectal ultrasound"
    A procedure in which a probe that sends out high-energy sound waves is inserted into the rectum. The sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissue called a sonogram. Transrectal ultrasound is used to look for abnormalities in the rectum and nearby structures, including the prostate. Also called endorectal ultrasound, ERUS, and TRUS.
    Transrectal ultrasound. An ultrasound probe is inserted into the rectum to check the prostate. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the prostate.
    Transrectal ultrasound; drawing shows a side view of the male reproductive and urinary system anatomy, including the bladder and prostate. Also shown is the rectum and anus. There is also an ultrasound probe inserted into the rectum to check the prostate. An inset shows a provider inserting the ultrasound probe into the patient's rectum while viewing an image of the ultrasound on a computer screen. The patient is lying on their back on a table.
  transsphenoidal surgery: (TRANS-sfee-NOY-dul SER-juh-ree)
    Pronunciation of dictionary term "transsphenoidal surgery"
    A type of surgery in which instruments are inserted through the nose and sphenoid sinus (a hollow space in a bone in the nose) to remove tumors that are in or near the pituitary gland. The pituitary gland is a pea-sized organ that lies at the base of the brain above the back of the nose.
    Transsphenoidal surgery. An endoscope and a curette are inserted through the nose and sphenoid sinus to remove cancer from the pituitary gland.
    Transsphenoidal surgery; drawing shows an endoscope and a curette inserted through the nose and sphenoid sinus to remove cancer from the pituitary gland. The sphenoid bone is also shown.
  transurethral biopsy: (TRANZ-yoo-REE-thrul BY-op-see)
    Pronunciation of dictionary term "transurethral biopsy"
    A procedure in which a sample of tissue is removed from the prostate for examination under a microscope. A thin, lighted tube is inserted through the urethra into the prostate, and a small piece of tissue is removed with a cutting loop.
  transurethral electroevaporation of the prostate: (TRANZ-yoo-REE-thrul ee-LEK-troh-ee-VA-per-AY-shun ... PROS-tayt)
    Pronunciation of dictionary term "transurethral electroevaporation of the prostate"
    A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra into the prostate. A ball or special wire loop on the instrument heats the prostate tissue and turns it to vapor. This relieves pressure and improves urine flow. Also called transurethral electrovaporization of the prostate, TUEVAP, and TUVP.
  transurethral electrovaporization of the prostate: (TRANZ-yoo-REE-thrul ee-LEK-troh-VAY-per-ih-ZAY-shun ... PROS-tayt)
    Pronunciation of dictionary term "transurethral electrovaporization of the prostate"
    A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra into the prostate. A ball or special wire loop on the instrument heats the prostate tissue and turns it to vapor. This relieves pressure and improves urine flow. Also called transurethral electroevaporation of the prostate, TUEVAP, and TUVP.
  transurethral incision of the prostate: (TRANZ-yoo-REE-thrul in-SIH-zhun ... PROS-tayt)
    Pronunciation of dictionary term "transurethral incision of the prostate"
    A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra and one or two small cuts are made in the bladder neck and prostate. This relieves pressure and improves urine flow. Also called TUIP.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  transurethral microwave thermotherapy: (TRANZ-yoo-REE-thrul MY-kroh-WAYV THER-moh-THAYR-uh-pee)
    Pronunciation of dictionary term "transurethral microwave thermotherapy"
    A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra into the bladder. A small microwave antenna on the instrument heats nearby prostate tissue and destroys it. This relieves pressure and improves urine flow. Also called TUMT.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  transurethral needle ablation: (TRANZ-yoo-REE-thrul NEE-dul a-BLAY-shun)
    Pronunciation of dictionary term "transurethral needle ablation"
    A procedure that is used to treat benign prostatic hypertrophy (BPH). An instrument with a small probe that gives off low-level radiofrequency energy is inserted through the urethra into the prostate. The energy from the probe heats nearby prostate tissue and destroys it. This relieves pressure and improves urine flow. Also called transurethral radiofrequency ablation and TUNA.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  transurethral radiofrequency ablation: (TRANZ-yoo-REE-thrul RAY-dee-oh-FREE-kwen-see a-BLAY-shun)
    Pronunciation of dictionary term "transurethral radiofrequency ablation"
    A procedure that is used to treat benign prostatic hypertrophy (BPH). An instrument with a small probe that gives off low-level radiofrequency energy is inserted through the urethra into the prostate. The energy from the probe heats nearby prostate tissue and destroys it. This relieves pressure and improves urine flow. Also called transurethral needle ablation and TUNA.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  transurethral resection: (TRANZ-yoo-REE-thrul ree-SEK-shun)
    Pronunciation of dictionary term "transurethral resection"
    Surgery performed with a special instrument inserted through the urethra. Also called TUR.
  transurethral resection of the prostate: (TRANZ-yoo-REE-thrul ree-SEK-shun ... PROS-tayt)
    Pronunciation of dictionary term "transurethral resection of the prostate"
    Surgery to remove tissue from the prostate using an instrument inserted through the urethra. Also called TURP.
    Transurethral resection of the prostate (TURP). Tissue is removed from the prostate using a resectoscope (a thin, lighted tube with a cutting tool at the end) inserted through the urethra. Prostate tissue that is blocking the urethra is cut away and removed through the resectoscope.
    Transurethral resection of the prostate; drawing shows removal of tissue from the prostate using a resectoscope (a thin, lighted tube with a cutting tool at the end) inserted through the urethra.
  transvaginal sonography: (tranz-VA-jih-nul soh-NAH-gruh-fee)
    Pronunciation of dictionary term "transvaginal sonography"
    A procedure used to examine the vagina, uterus, fallopian tubes, ovaries, and bladder. An instrument is inserted into the vagina that causes sound waves to bounce off organs inside the pelvis. These sound waves create echoes that are sent to a computer, which creates a picture called a sonogram. Also called transvaginal ultrasound and TVS.
    Transvaginal ultrasound. An ultrasound probe connected to a computer is inserted into the vagina and is gently moved to show different organs. The probe bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
    Transvaginal ultrasound; drawing shows a side view of the female reproductive anatomy during a transvaginal ultrasound procedure. An ultrasound probe (a device that makes sound waves that bounce off tissues inside the body) is shown inserted into the vagina. The bladder, uterus, right fallopian tube, and right ovary are also shown. The inset shows the diagnostic sonographer (a person trained to perform ultrasound procedures) examining a woman on a table, and a computer screen shows an image of the patient’s internal tissues.
  transvaginal ultrasound: (tranz-VA-jih-nul UL-truh-sownd)
    Pronunciation of dictionary term "transvaginal ultrasound"
    A procedure used to examine the vagina, uterus, fallopian tubes, ovaries, and bladder. An instrument is inserted into the vagina that causes sound waves to bounce off organs inside the pelvis. These sound waves create echoes that are sent to a computer, which creates a picture called a sonogram. Also called transvaginal sonography and TVS.
    Transvaginal ultrasound. An ultrasound probe connected to a computer is inserted into the vagina and is gently moved to show different organs. The probe bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
    Transvaginal ultrasound; drawing shows a side view of the female reproductive anatomy during a transvaginal ultrasound procedure. An ultrasound probe (a device that makes sound waves that bounce off tissues inside the body) is shown inserted into the vagina. The bladder, uterus, right fallopian tube, and right ovary are also shown. The inset shows the diagnostic sonographer (a person trained to perform ultrasound procedures) examining a woman on a table, and a computer screen shows an image of the patient’s internal tissues.
  transverse rectus abdominis myocutaneous flap: (TRANZ-vers REK-tus ab-DAH-mih-nis MY-oh-kyoo-TAY-nee-us …)
    Pronunciation of dictionary term "transverse rectus abdominis myocutaneous flap"
    A type of surgery used to rebuild the shape of the breast after a mastectomy. A muscle in the lower abdomen called the rectus abdominis, along with skin, fat, and blood vessels, is moved from the lower abdomen to the chest. This is usually done by passing the muscle tissue and blood vessels through a tunnel under the skin to the chest. A transverse rectus abdominis myocutaneous flap forms a natural-looking breast, so the patient usually does not need a breast implant. It is a type of breast reconstruction. Also called TRAM flap.
    More Information
    - Breast Reconstruction After Mastectomy (https://www.cancer.gov/types/breast/reconstruction-fact-sheet)
  trastuzumab: (tras-TOO-zoo-mab)
    Pronunciation of dictionary term "trastuzumab"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Trastuzumab binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Trastuzumab is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Hercessi, Herzuma, Kanjinti, Ogivri, Ontruzant, and Trazimera.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  trastuzumab and hyaluronidase: (tras-TOO-zoo-mab … HY-al-yoo-RAH-nih-days)
    Pronunciation of dictionary term "trastuzumab and hyaluronidase"
    A combination of two drugs used alone or with other drugs to treat adults with certain types of HER2-positive breast cancer. Trastuzumab binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Hyaluronidase allows trastuzumab to be given by injection under the skin. Trastuzumab and hyaluronidase can be given in less time than trastuzumab alone, which is given as an infusion. Also called Herceptin Hylecta.
    More Information
    - Trastuzumab and Hyaluronidase-oysk (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumabandhyaluronidase-oysk)
  trastuzumab deruxtecan: (tras-TOO-zoo-mab DEH-rux-TEE-kan)
    Pronunciation of dictionary term "trastuzumab deruxtecan"
    A drug used to treat adults with certain types of HER2-positive or HER2-low breast cancer, HER2-positive stomach cancer, gastroesophageal junction cancer, or other solid tumor, or non-small cell lung cancer that has a certain mutation in the HER2 gene. It is also being studied in the treatment of other types of cancer. Trastuzumab deruxtecan contains a monoclonal antibody called trastuzumab that binds to a protein called HER2, which is found on some cancer cells. It also contains an anticancer drug called deruxtecan, which may help kill cancer cells. Trastuzumab deruxtecan is a type of antibody-drug conjugate. Also called Enhertu and fam-trastuzumab deruxtecan.
    More Information
    - Fam-Trastuzumab Deruxtecan-nxki (https://www.cancer.gov/about-cancer/treatment/drugs/famtrastuzumabderuxtecan-nxki)
  trauma: (TRAW-muh)
    Pronunciation of dictionary term "trauma"
    Injury to the body, or an event that causes long-lasting mental or emotional damage.
  Traumeel S: (TRUH-meel …)
    Pronunciation of dictionary term "Traumeel S"
    A substance that contains minerals and extracts of 14 plants, including belladonna, arnica, St. John's wort, and Echinacea. It is being studied as a mouth rinse treatment for oral mucositis (painful mouth sores) caused by cancer therapy. It is known as a homeopathic remedy.
  Trazimera: (TRA-zih-MAYR-uh)
    Pronunciation of dictionary term "Trazimera"
    A drug used alone or with other drugs to treat certain types of breast cancer, stomach cancer, and gastroesophageal junction cancer that are HER2 positive. It is also being studied in the treatment of other types of cancer. Trazimera binds to a protein called HER2, which is found on some cancer cells. This may help the immune system kill cancer cells. Trazimera is a type of monoclonal antibody and a type of HER2 receptor antagonist. Also called Herceptin, Hercessi, Herzuma, Kanjinti, Ogivri, Ontruzant, and trastuzumab.
    More Information
    - Trastuzumab (https://www.cancer.gov/about-cancer/treatment/drugs/trastuzumab)
  trazodone: (TRA-zoh-done)
    Pronunciation of dictionary term "trazodone"
    A drug used to treat depression. It may also be used to help relieve anxiety and insomnia (trouble sleeping) and to treat certain other disorders. Trazodone increases the level of the chemical serotonin in the brain, which helps improve mood. It is a type of antidepressant. Also called Oleptro.
  Treanda: (tree-AN-duh)
    Pronunciation of dictionary term "Treanda"
    A drug used to treat chronic lymphocytic leukemia and certain types of non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Treanda damages the cell’s DNA and may kill cancer cells. It is a type of alkylating agent. Also called Belrapzo, bendamustine hydrochloride, and Bendeka.
    More Information
    - Bendamustine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/bendamustinehydrochloride)
  treatment course: (TREET-ment kors)
    Pronunciation of dictionary term "treatment course"
    A treatment plan made up of several cycles of treatment. For example, treatment given for one week followed by three weeks of rest (no treatment) is one treatment cycle. When a treatment cycle is repeated multiple times on a regular schedule, it makes up a treatment course. A treatment course can last for several months. Also called course of treatment.
  treatment cycle: (TREET-ment SY-kul)
    Pronunciation of dictionary term "treatment cycle"
    A period of treatment followed by a period of rest (no treatment) that is repeated on a regular schedule. For example, treatment given for one week followed by three weeks of rest is one treatment cycle. When this cycle is repeated multiple times on a regular schedule, it makes up a course of treatment. Also called cycle of treatment.
  treatment field: (TREET-ment feeld)
    Pronunciation of dictionary term "treatment field"
    In radiation therapy, the place on the body where the radiation beam is aimed.
  treatment plan: (TREET-ment plan)
    Pronunciation of dictionary term "treatment plan"
    A detailed plan with information about a patient’s disease, the goal of treatment, the treatment options for the disease and possible side effects, and the expected length of treatment. A treatment plan may also include information about how much the treatment is likely to cost and about regular follow-up care after treatment ends.
  treatment schedule: (TREET-ment SKEH-jool)
    Pronunciation of dictionary term "treatment schedule"
    A step-by-step plan of the treatment that a patient is going to receive. A treatment schedule includes the type of treatment that will be given (such as chemotherapy or radiation therapy), how it will be given (such as by mouth or by infusion into a vein), and how often it will be given (such as once a day or once a week). It also includes the amount of time between courses of treatment and the total length of time of treatment.
  treatment summary: (TREET-ment SUH-muh-ree)
    Pronunciation of dictionary term "treatment summary"
    A detailed summary of a patient’s disease, the type of treatment the patient received, and any side effects or other problems caused by treatment. It usually includes results of laboratory tests (such as pathology reports and biomarker tests) and imaging tests (such as x-rays, CT scans, and MRIs), and whether a patient took part in a clinical trial. A treatment summary may be used to help plan follow-up care after treatment for a disease, such as cancer.
  Trelstar: (TREL-star)
    Pronunciation of dictionary term "Trelstar"
    A drug used to treat advanced prostate cancer. It is also being studied in the treatment of other types of cancer. Trelstar initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men. With continued use, Trelstar lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels. Trelstar may slow or stop the growth of cancer cells that need testosterone to grow. It is a type of luteinizing hormone-releasing hormone (LHRH) agonist. Also called triptorelin pamoate.
  tremelimumab: (treh-meh-LIM-yoo-mab)
    Pronunciation of dictionary term "tremelimumab"
    A drug that binds to the protein CTLA-4 to help immune cells kill cancer cells better and is used to treat different types of cancer. Tremelimumab is used with durvalumab to treat adults with hepatocellular carcinoma (a type of liver cancer) that cannot be removed by surgery. It is also used with durvalumab and platinum chemotherapy to treat adults with non-small cell lung cancer that has spread to other parts of the body and does not have an abnormal EGFR or ALK gene. It is also being studied in the treatment of other types of cancer. Tremelimumab may block CTLA-4 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called Imjudo.
    More Information
    - Tremelimumab-actl (https://www.cancer.gov/about-cancer/treatment/drugs/tremelimumab-actl)
  treosulfan: (TREE-oh-SUL-fan)
    Pronunciation of dictionary term "treosulfan"
    A drug given with fludarabine phosphate before a donor hematopoietic stem cell transplant in adults and children aged 1 year and older with acute myeloid leukemia or myelodysplastic syndrome. It is also being studied in the treatment of other types of cancer. Treosulfan may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called Grafapex.
  trephine: (TREE-fine)
    Pronunciation of dictionary term "trephine"
    A surgical tool used to cut out circular pieces of bone or other tissue.
  tretinoin: (TREH-tih-NOYN)
    Pronunciation of dictionary term "tretinoin"
    A nutrient that the body needs in small amounts to function and stay healthy. Tretinoin is made in the body from vitamin A and helps cells to grow and develop, especially in the embryo. A form of tretinoin made in the laboratory is put on the skin to treat conditions such as acne and is taken by mouth to treat acute promyelocytic leukemia (a fast-growing cancer in which there are too many immature blood-forming cells in the blood and bone marrow). Tretinoin is being studied in the prevention and treatment of other types of cancer. Also called all-trans retinoic acid, ATRA, retinoic acid, and vitamin A acid.
  Trexall: (TREK-sawl)
    Pronunciation of dictionary term "Trexall"
    A drug used alone or with other drugs to treat many types of cancer, certain types of arthritis, and severe psoriasis (a type of skin condition). It is also being studied in the treatment of other conditions and types of cancer. Trexall stops cells from using folic acid to make DNA and may kill cancer cells. It may also lower the body’s immune response. Trexall is a type of antimetabolite and a type of antifolate. Also called methotrexate sodium, MTX, and Xatmep.
    More Information
    - Methotrexate Sodium (Cancer Treatment) (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
  triacetyluridine: (try-A-seh-til-YOOR-ih-deen)
    Pronunciation of dictionary term "triacetyluridine"
    A drug used in the emergency treatment of adults and children who receive too much fluorouracil or capecitabine or who have heart or central nervous system toxicity or other serious side effects that occur within 4 days of ending treatment with these drugs. Triacetyluridine may help protect healthy cells from some of the side effects caused by certain anticancer drugs. It is a type of chemoprotective agent and a type of pyrimidine analog. Also called PN401, uridine triacetate, and Vistogard.
    More Information
    - Uridine Triacetate (https://www.cancer.gov/about-cancer/treatment/drugs/uridinetriacetate)
  trial sponsor: (TRY-ul SPON-ser)
    Pronunciation of dictionary term "trial sponsor"
    A person, company, institution, group, or organization that oversees or pays for a clinical trial and collects and analyzes the data. Also called clinical trial sponsor.
  triamcinolone: (try-am-SIH-noh-lone)
    Pronunciation of dictionary term "triamcinolone"
    A substance that is being studied for the prevention of nonmelanoma skin cancer. It is an anti-inflammatory drug that is applied to the skin to relieve irritation, rashes, and infections. It belongs to the family of drugs called topical corticosteroids.
  Triapine: (TRY-uh-peen)
    Pronunciation of dictionary term "Triapine"
    A substance being studied in the treatment of cancer. It is a type of ribonucleotide reductase inhibitor. Also called 3-aminopyridine-2-carboxaldehyde thiosemicarbazone and 3-AP.
  tributyrin: (try-BYOO-tuh-rin)
    Pronunciation of dictionary term "tributyrin"
    A triglyceride drug that may inhibit cell growth and induce cell differentiation. Differentiating agents may be effective in changing cancer cells back into normal cells.
  trichilemmoma: (TRIH-kih-leh-MOH-muh)
    Pronunciation of dictionary term "trichilemmoma"
    A benign (not cancer) tumor that begins in the outer cells of a hair follicle and appears as a small, smooth, skin-colored, wart-like or dome-shaped lesion. Trichilemmomas usually occur on the face, ears, and neck but can also occur on the lower part of the arm and the hands. They tend to grow slowly over time and often occur with other skin lesions. Trichilemmomas may be found in people with a rare, inherited condition called Cowden syndrome.
    Trichilemmomas are benign tumors arising from the outer cells of the hair follicle. They are commonly found on the head and face, as shown.
    Photograph of a small, raised lesion on an individual’s forehead.
    Trichilemmomas are benign tumors arising from the outer cells of the hair follicle. They are commonly found on the head and face, as shown.
    Photograph of a small, raised lesion on an individual’s forehead.
  trichothiodystrophy: (TRIH-koh-thy-oh-DIS-truh-fee)
    Pronunciation of dictionary term "trichothiodystrophy"
    A rare, inherited genetic disorder marked by short, dry hair that breaks easily and has a light- and dark-colored striped (tiger-tail) pattern when looked at under a microscope. There are many other signs and symptoms of trichothiodystrophy that begin in infancy and vary from person to person. About half of all people with trichothiodystrophy also have an extreme sensitivity to sunlight and may develop a severe blistering sunburn after a short time in the sun. Other signs and symptoms may include learning and developmental delays, shorter-than-average height, recurrent infections, dry, scaly skin, and abnormalities of the nails, eyes, and bones. Trichothiodystrophy is associated with mutations (changes) in several genes and is inherited in an autosomal recessive manner.
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  TriCor: (TRY-kor)
    Pronunciation of dictionary term "TriCor"
    A drug used to treat high levels of cholesterol and triglycerides in the blood. TriCor is being studied in the treatment of advanced cancers in young patients and in the treatment of other conditions. It is a type of antilipidemic agent. Also called fenofibrate and Lofibra.
  tricyclic antidepressant: (try-SY-klik AN-tee-dee-PREH-sunt)
    Pronunciation of dictionary term "tricyclic antidepressant"
    A type of drug used to treat depression.
  trifluridine and tipiracil hydrochloride: (try-FLOOR-ih-deen … ty-PEER-uh-sil HY-droh-KLOR-ide)
    Pronunciation of dictionary term "trifluridine and tipiracil hydrochloride"
    A combination of two drugs used alone or with bevacizumab to treat adults with certain types of colorectal cancer, stomach cancer, or gastroesophageal junction cancer. It is used in patients whose cancer has spread to other parts of the body and has already been treated with other anticancer treatments. It is also being studied in the treatment of other types of cancer. Trifluridine and tipiracil hydrochloride stops cells from making DNA, which may help keep cancer cells from growing and may kill them. It is a type of antimetabolite and a type of thymidine phosphorylase inhibitor. Also called Lonsurf.
    More Information
    - Trifluridine and Tipiracil Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/trifluridine-tipiracilhydrochloride)
  Trifolium pratense: (try-FOH-lee-um pray-TEN-see)
    Pronunciation of dictionary term "Trifolium pratense"
    A plant whose flowers have been used in some cultures to treat certain medical problems. It is being studied in the relief of menopausal symptoms and may have anticancer effects. Also called purple clover, red clover, and wild clover.
  trigeminal nerve: (try-JEH-mih-nul nerv)
    Pronunciation of dictionary term "trigeminal nerve"
    The main sensory nerve of the head and face, and the motor nerve of the muscles used in chewing. Also called fifth cranial nerve.
  trigger: (TRIH-ger)
    Pronunciation of dictionary term "trigger"
    In medicine, a specific event that starts a process or that causes a particular outcome. For example, chemotherapy, painful treatments, or the smells, sounds, and sights that go with them may trigger anxiety and fear in a patient who has cancer. In allergies, exposure to mold, pollen or dust may trigger sneezing, watery eyes, and coughing.
  trigger point acupuncture: (TRIH-ger poynt AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "trigger point acupuncture"
    Use of acupuncture to treat pain by inserting needles into trigger points on the body. Trigger points are places on the body where injury has occurred, but the pain has been sent along nerves and is felt in another place in the body.
  triiodothyronine: (try-I-oh-doh-THY-ruh-neen)
    Pronunciation of dictionary term "triiodothyronine"
    A thyroid hormone. Also called T-3.
  Trilisate: (TRIH-lih-sayt)
    Pronunciation of dictionary term "Trilisate"
    A substance used to treat arthritis and relieve pain, inflammation, and fever. It is also being studied in the treatment of acute myeloid leukemia (AML). Trilisate blocks the action of a substance that sends a pain message to the brain. It is a type of nonsteroidal anti-inflammatory drug (NSAID). Also called choline magnesium trisalicylate.
  trimethoprim-sulfamethoxazole: (try-MEH-thoh-prim-SUL-fuh-meh-THOK-suh-zole)
    Pronunciation of dictionary term "trimethoprim-sulfamethoxazole"
    An antibiotic drug used to treat infection and prevent pneumocystis carinii pneumonia.
  trimetrexate glucuronate: (TRY-meh-TREK-sayt gloo-KYOO-roh-nayt)
    Pronunciation of dictionary term "trimetrexate glucuronate"
    A drug that belongs to the family of drugs called antimetabolites. It is used in the treatment of pneumocystis carinii pneumonia and is being studied in the treatment of cancer.
  Triostat: (TRY-oh-stat)
    Pronunciation of dictionary term "Triostat"
    A drug that is used to treat certain thyroid (a gland located near the voice box) conditions. It is also being studied in the treatment of thyroid cancer. Triostat is made in the laboratory and is a form of the thyroid hormone triiodthyronine (T3). Also called Cytomel and liothyronine sodium.
  triple-negative breast cancer: (TRIH-pul-NEH-guh-tiv brest KAN-ser)
    Pronunciation of dictionary term "triple-negative breast cancer"
    A type of breast cancer in which the tumor cells do not have estrogen receptors, progesterone receptors, or large amounts of HER2/neu protein on their surface. Knowing whether breast cancer is triple negative is important in planning treatment. Also called ER-negative PR-negative HER2/neu-negative breast cancer and TNBC.
    Triple-negative breast cancer is a type of breast cancer in which the cancer cells do not have estrogen receptors, progesterone receptors, or large amounts of HER2/neu protein on their surface.
    Drawing showing a triple-negative breast cancer cell with the estrogen receptor, progesterone receptor, and HER2 proteins crossed out with a black "X" mark. This means that the breast cancer cell does not have these proteins.
  triple-positive breast cancer: (TRIH-pul-PAH-zih-tiv brest KAN-ser)
    Pronunciation of dictionary term "triple-positive breast cancer"
    A type of breast cancer in which the tumor cells have estrogen receptors, progesterone receptors, and a larger than normal number of HER2 receptors on their surface. Knowing if breast cancer is triple positive may help plan the best treatment, which may include hormone therapy and drugs that target the HER2 receptor.
  triptorelin pamoate: (TRIP-toh-REH-lin PAM-oh-ayt)
    Pronunciation of dictionary term "triptorelin pamoate"
    A drug used to treat advanced prostate cancer. It is also being studied in the treatment of other types of cancer. Triptorelin pamoate initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men. With continued use, triptorelin pamoate lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels. Triptorelin pamoate may slow or stop the growth of cancer cells that need testosterone to grow. It is a type of luteinizing hormone-releasing hormone (LHRH) agonist. Also called Trelstar.
  Trisenox: (TRY-seh-nox)
    Pronunciation of dictionary term "Trisenox"
    A drug used to treat acute promyelocytic leukemia that has a certain chromosome abnormality or a fusion gene called PML::RARA. It is used with tretinoin in some newly diagnosed adults. It is also used alone in patients whose cancer has not gotten better or has come back after treatment with other anticancer drugs. Trisenox is also being studied in the treatment of other types of cancer. Trisenox damages a fusion protein made by the PML::RARA fusion gene. This may help keep cancer cells from growing and may kill them. Also called arsenic trioxide.
    More Information
    - Arsenic Trioxide (https://www.cancer.gov/about-cancer/treatment/drugs/arsenictrioxide)
  trisomy: (TRY-soh-mee)
    Pronunciation of dictionary term "trisomy"
    The presence of three copies of a specific chromosome in some or all of the body’s cells instead of the usual two copies. For example, people with Down syndrome have an extra copy of chromosome 21.
  trisomy 18: (TRY-soh-mee …)
    Pronunciation of dictionary term "trisomy 18"
    A genetic disorder caused by having an extra chromosome 18 in some or all of the body’s cells. Trisomy 18 is marked by a low birth weight and certain abnormal features. These include a small, abnormally shaped head; a small jaw and mouth; clenched fists with overlapping fingers; and heart, lung, kidney, intestine, and stomach defects. Many babies with trisomy 18 die before birth or within the first month of life, but some children live for several years. Having trisomy 18 increases the risk of certain types of cancer, such as hepatoblastoma (a type of liver cancer) and Wilms tumor (a type of kidney cancer). Also called Edwards syndrome.
    More Information
    - Trisomy 18 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/6321/edwards-syndrome)
    - Trisomy 18 (MedlinePlus) (https://medlineplus.gov/genetics/condition/trisomy-18/)
  trisomy 21: (TRY-soh-mee …)
    Pronunciation of dictionary term "trisomy 21"
    A genetic condition caused by having an extra chromosome 21 in some or all of the body’s cells. Trisomy 21 is marked by growth, developmental, and learning delays that vary from mild to severe. People with trisomy 21 often have certain distinct physical features, such as a shorter-than-normal height, a flat face with a short nose, eyes that are slanted and almond-shaped, small ears, a short neck, a tongue that tends to stick out of the mouth, small hands and feet, and a deep line that goes across the palm of the hand. People with trisomy 21 may also have muscle weakness, loose joints, heart defects, and other health problems. Having trisomy 21 increases the risk of developing Alzheimer disease at an early age, usually around the age of 50, and leukemia, especially in young children. Trisomy 21 is usually not inherited (passed from parent to child). Also called Down syndrome.
    More Information
    - Down syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/10247/down-syndrome)
    - Down syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/down-syndrome/)
  Trk inhibitor LOXO-101: (... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "Trk inhibitor LOXO-101"
    A drug used to treat adults and children with certain types of solid tumors that have spread or cannot be removed by surgery and have the NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Trk inhibitor LOXO-101 blocks the TRK protein, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called larotrectinib sulfate, LOXO-101, and Vitrakvi.
    More Information
    - Larotrectinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)
  TRK protein family: (… PROH-teen FA-mih-lee)
    Pronunciation of dictionary term "TRK protein family"
    A family of proteins that are found on nerve cells. They are involved in cell signaling pathways that control cell growth, cell maturation, and cell survival. The genes that make the TRK proteins may have mutations (changes) that cause abnormal TRK proteins to be made. These abnormal proteins may be too active or found in higher than normal amounts on some types of cancer cells, which may cause cancer cells to grow. Drugs that block TRK proteins are being used in the treatment of some types of cancer. TRK proteins are receptor tyrosine kinases. Also called tropomyosin receptor kinase protein family.
  Trodelvy: (troh-DEL-vee)
    Pronunciation of dictionary term "Trodelvy"
    A drug used to treat adults with certain types of breast cancer that have already been treated with other therapy. It is also being studied in the treatment of other types of cancer. Trodelvy contains a monoclonal antibody called sacituzumab that binds to a protein called TROP2, which is found on some cancer cells. It also contains an anticancer drug called SN-38, which may help kill cancer cells. Trodelvy is a type of antibody-drug conjugate. Also called sacituzumab govitecan.
    More Information
    - Sacituzumab Govitecan-hziy (https://www.cancer.gov/about-cancer/treatment/drugs/sacituzumabgovitecan-hziy)
  trophoblast: (TROH-foh-BLAST)
    Pronunciation of dictionary term "trophoblast"
    A thin layer of cells that helps a developing embryo attach to the wall of the uterus, protects the embryo, and forms a part of the placenta.
  tropisetron: (troh-PIH-seh-tron)
    Pronunciation of dictionary term "tropisetron"
    A drug used to prevent nausea and vomiting caused by cancer treatment. It is also used to prevent nausea and vomiting after surgery. Tropisetron blocks the action of the chemical serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. It is a type of serotonin receptor antagonist and a type of antiemetic. It is not available in the United States.
  tropomyosin receptor kinase protein family: (TROH-poh-MY-oh-sin reh-SEP-ter KY-nays PROH-teen FA-mih-lee)
    Pronunciation of dictionary term "tropomyosin receptor kinase protein family"
    A family of proteins that are found on nerve cells. They are involved in cell signaling pathways that control cell growth, cell maturation, and cell survival. The genes that make the tropomyosin receptor kinase proteins may have mutations (changes) that cause abnormal tropomyosin receptor kinase proteins to be made. These abnormal proteins may be too active or found in higher than normal amounts on some types of cancer cells, which may cause cancer cells to grow. Drugs that block tropomyosin receptor kinase proteins are being used in the treatment of some types of cancer. Tropomyosin receptor kinase proteins are receptor tyrosine kinases. Also called TRK protein family.
  troxacitabine: (TROK-suh-SY-tuh-been)
    Pronunciation of dictionary term "troxacitabine"
    A drug being studied for use as an anticancer agent.
  TRPV6: A protein found in cell membranes that moves calcium into cells. Levels of TRPV6 are lower than normal in patients who don’t have enough vitamin D. High levels of the protein may be found in breast cancer tissue. It is a type of calcium channel protein. Also called transient receptor potential cation channel, subfamily V, member 6.
  true histiocytic lymphoma: (... HIS-tee-oh-SIH-tik lim-FOH-muh)
    Pronunciation of dictionary term "true histiocytic lymphoma"
    A rare, very aggressive (fast-growing) type of non-Hodgkin lymphoma (cancer that begins in the cells of the immune system). It is marked by large abnormal lymphoid cells that do not look like T cells or B cells.
  true lavender: (...LA-ven-der)
    Pronunciation of dictionary term "true lavender"
    A plant with aromatic leaves and flowers that is a member of the mint family. Oil from the flowers has been used in some cultures to treat certain medical problems, to keep insects away, and to wash in. It is also used in aromatherapy. Perillyl alcohol, a substance found in true lavender, is being studied in cancer prevention and treatment. The scientific name is Lavandula angustifolia. Also called English lavender and lavender.
  trunk: The main part of the body that contains the chest, abdomen, pelvis, and back. Most of the body’s organs and the backbone are found in the trunk. Also called torso.
  Truqap: (TROO-kap)
    Pronunciation of dictionary term "Truqap"
    A drug used with fulvestrant to treat adults with hormone-receptor positive, HER2-negative breast cancer that has spread and has an abnormal PIK3CA, AKT1, or PTEN gene. It is used in patients whose cancer came back or got worse during or after treatment with hormone therapy. It is also being studied in the treatment of other types of cancer. Truqap blocks a protein called AKT, which is involved in cell signaling, cell growth, and cell survival. Blocking this protein may help keep cancer cells from growing and may kill them. Truqap is a type of kinase inhibitor. Also called capivasertib.
    More Information
    - Capivasertib (https://www.cancer.gov/about-cancer/treatment/drugs/capivasertib)
  TRUS: A procedure in which a probe that sends out high-energy sound waves is inserted into the rectum. The sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissue called a sonogram. TRUS is used to look for abnormalities in the rectum and nearby structures, including the prostate. Also called endorectal ultrasound, ERUS, and transrectal ultrasound.
    Transrectal ultrasound. An ultrasound probe is inserted into the rectum to check the prostate. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the prostate.
    Transrectal ultrasound; drawing shows a side view of the male reproductive and urinary system anatomy, including the bladder and prostate. Also shown is the rectum and anus. There is also an ultrasound probe inserted into the rectum to check the prostate. An inset shows a provider inserting the ultrasound probe into the patient's rectum while viewing an image of the ultrasound on a computer screen. The patient is lying on their back on a table.
  Truseltiq: (troo-SEL-tik)
    Pronunciation of dictionary term "Truseltiq"
    A drug used to treat adults with cholangiocarinoma (bile duct cancer) that is locally advanced and cannot be removed by surgery or has spread to other parts of the body. It is used in patients whose cancer has a FGFR2 gene fusion or other change in the structure of the FGFR2 gene and has already been treated. It is also being studied in the treatment of other types of cancer. Truseltiq blocks a protein called FGFR, which may help keep cancer cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Truseltiq is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called infigratinib phosphate.
    More Information
    - Infigratinib Phosphate (https://www.cancer.gov/about-cancer/treatment/drugs/infigratinibphosphate)
  trust: (trust)
    Pronunciation of dictionary term "trust"
    A legal document in which a person states what is to be done with his or her property after death. There are many types of trusts, and a trust may take the place of a will.
  Truxima: (truk-SEE-muh)
    Pronunciation of dictionary term "Truxima"
    A drug that contains the active ingredient rituximab and is used alone or with other drugs to treat adults with certain types of B-cell non-Hodgkin lymphoma or chronic lymphocytic leukemia that are CD20 positive. It is also being studied in the treatment of other conditions and types of cancer. Truxima binds to a protein called CD20, which is found on B cells (a type of white blood cell) and some types of cancer cells. This may help the immune system kill cancer cells. Truxima is a type of monoclonal antibody.
    More Information
    - Rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab)
  TSEB radiation therapy: (... RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "TSEB radiation therapy"
    A type of radiation therapy using electrons that is directed at the entire surface of the body. This type of radiation goes into the outer layers of the skin, but does not go deeper into tissues and organs below the skin. Also called total skin electron beam radiation therapy.
  TSH: A hormone produced by the pituitary gland. TSH stimulates the release of thyroid hormone from thyroglobulin. It also stimulates the growth of thyroid follicular cells. An abnormal TSH level may mean that the thyroid hormonal regulation system is out of control, usually as a result of a benign condition (hyperthyroidism or hypothyroidism). Also called thyroid-stimulating hormone.
  TSNA: A type of harmful, cancer-causing chemical found in tobacco and tobacco smoke. TSNAs are formed when tobacco leaves are grown, cured, aged, and processed. Tobacco products can contain different amounts of TSNAs, depending on how they are made. Also called tobacco-specific nitrosamine.
  TTI-237: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called mitotic inhibitors.
  TTMB: A procedure being studied in the diagnosis of prostate cancer and in planning prostate cancer treatment. Ultrasound is used to create a map of the prostate so the whole prostate gland can be seen in three dimensions and divided into 24 areas. Needles are then inserted through a template into each of the 24 areas and tissue is removed to be checked under a microscope. Also called transperineal template-guided prostate mapping biopsy.
  TTP: The length of time from the date of diagnosis or the start of treatment for a disease until the disease starts to get worse or spread to other parts of the body. In a clinical trial, measuring the TTP is one way to see how well a new treatment works. Also called time to progression.
  tubal ligation: (TOO-bul ly-GAY-shun)
    Pronunciation of dictionary term "tubal ligation"
    An operation to tie the fallopian tubes closed. This procedure prevents pregnancy by blocking the passage of eggs from the ovaries to the uterus.
  tubefeeding: (toob-FEE-ding)
    Pronunciation of dictionary term "tubefeeding"
    A way of giving medicines and liquids, including liquid foods, through a small tube placed through the nose or mouth into the stomach or small intestine. Sometimes the tube is placed into the stomach or small intestine through an incision (cut) made on the outside of the abdomen. Tubefeeding may be added to what a person is able to eat and drink, or it may be the only source of nutrition. It is a type of enteral nutrition. Also called gavage.
  tuberculosis: (too-BER-kyoo-LOH-sis)
    Pronunciation of dictionary term "tuberculosis"
    A disease caused by a specific type of bacteria that spreads from one person to another through the air. Tuberculosis can affect many parts of the body, but most often affects the lungs. A person may not have symptoms of tuberculosis for years, but they may appear when the patient becomes ill with a serious condition like diabetes, AIDS, or cancer. Tuberculosis can usually be treated and cured with antibiotics. Also called TB.
  tuberous sclerosis: (TOO-ber-us skleh-ROH-sis)
    Pronunciation of dictionary term "tuberous sclerosis"
    A genetic disorder in which tumors form in the kidneys, brain, eyes, heart, lungs, and skin. This disease can cause seizures, mental disabilities, and different types of skin lesions.
    More Information
    - Tuberous sclerosis complex (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7830/tuberous-sclerosis)
    - Tuberous sclerosis complex (MedlinePlus) (https://medlineplus.gov/genetics/condition/tuberous-sclerosis-complex/)
  tubulin: (TOO-byoo-lin)
    Pronunciation of dictionary term "tubulin"
    One of a group of proteins found in high levels in the cell cytoplasm (fluid inside a cell but outside the cell's nucleus). Tubulins are the building blocks of microtubules (narrow, hollow tubes inside a cell), which are involved in cell division and cell movement. Certain anticancer drugs bind to and block the formation or function of tubulins, which may block cell division.
  tubulovillous adenoma: (TOO-byoo-loh-VIH-lus A-deh-NOH-muh)
    Pronunciation of dictionary term "tubulovillous adenoma"
    A type of polyp that grows in the colon and other places in the gastrointestinal tract and sometimes in other parts of the body. These adenomas may become malignant (cancer).
  tucatinib: (too-KA-tih-nib)
    Pronunciation of dictionary term "tucatinib"
    A drug used with other drugs to treat adults with certain types of HER2-positive breast cancer or certain types of HER2-positive colorectal cancer that do not have a mutation (change) in the RAS gene. It is also being studied in the treatment of other types of cancer. Tucatinib blocks a protein called HER2, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called Tukysa.
    More Information
    - Tucatinib (https://www.cancer.gov/about-cancer/treatment/drugs/tucatinib)
  TUEVAP: A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra into the prostate. A ball or special wire loop on the instrument heats the prostate tissue and turns it to vapor. This relieves pressure and improves urine flow. Also called transurethral electroevaporation of the prostate, transurethral electrovaporization of the prostate, and TUVP.
  tufted angioma: (TUF-ted AN-jee-OH-muh)
    Pronunciation of dictionary term "tufted angioma"
    A rare, benign (not cancer) blood vessel tumor that usually forms on the skin of the arms and legs, but may also form in deeper tissues, such as muscle and bone. Tufted angiomas grow slowly and can spread to nearby tissue. Signs and symptoms may include firm, painful areas of skin that look bruised; purple or brownish-red areas on the skin; easy bruising; anemia; and abnormal bleeding. Tufted angiomas are most common in infants and young children. They are a type of vascular tumor.
  tui na: (twee-nah)
    Pronunciation of dictionary term "tui na"
    Chinese massage that uses kneading, pressing, rolling, shaking, and stretching of the body. Tui na is thought to regulate qi (vital energy) and blood flow, and improve the function of tendons, bones, and joints.
  TUIP: A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra and one or two small cuts are made in the bladder neck and prostate. This relieves pressure and improves urine flow. Also called transurethral incision of the prostate.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  Tukysa: (too-KY-suh)
    Pronunciation of dictionary term "Tukysa"
    A drug used with other drugs to treat adults with certain types of HER2-positive breast cancer or certain types of HER2-positive colorectal cancer that do not have a mutation (change) in the RAS gene. It is also being studied in the treatment of other types of cancer. Tukysa blocks a protein called HER2, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called tucatinib.
    More Information
    - Tucatinib (https://www.cancer.gov/about-cancer/treatment/drugs/tucatinib)
  tumescent mastectomy: (too-MEH-sent ma-STEK-toh-mee)
    Pronunciation of dictionary term "tumescent mastectomy"
    A type of surgery to remove the breast. The breast is injected with a liquid mixture of salts and small amounts of two drugs. These drugs are lidocaine, to numb the area, and epinephrine, to narrow blood vessels and reduce bleeding. Tumescent mastectomy is usually used to treat breast cancer in elderly patients.
  tumor: (TOO-mer)
    Pronunciation of dictionary term "tumor"
    An abnormal mass of tissue that forms when cells grow and divide more than they should or do not die when they should. Tumors may be benign (not cancer) or malignant (cancer). Benign tumors may grow large but do not spread into, or invade, nearby tissues or other parts of the body. Malignant tumors can spread into, or invade, nearby tissues. They can also spread to other parts of the body through the blood and lymph systems. Also called neoplasm.
    More Information
    - What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)
  tumor antigen vaccine: (TOO-mer AN-tih-jen vak-SEEN)
    Pronunciation of dictionary term "tumor antigen vaccine"
    A vaccine made of cancer cells, parts of cancer cells, or pure tumor antigens (substances isolated from tumor cells). A tumor antigen vaccine may stimulate the body's immune system to find and kill cancer cells.
  tumor board review: (TOO-mer bord reh-VYOO)
    Pronunciation of dictionary term "tumor board review"
    A treatment planning process in which a group of cancer doctors and other health care specialists meet regularly to review and discuss new and complex cancer cases. The goal of a tumor board review is to decide as a group on the best treatment plan for a patient. These meetings can involve specialists from many areas of health care, including medical oncologists, radiation oncologists, surgeons, pathologists, radiologists, genetics experts, nurses, physical therapists, and social workers.
  tumor burden: (TOO-mer BUR-den)
    Pronunciation of dictionary term "tumor burden"
    Refers to the number of cancer cells, the size of a tumor, or the amount of cancer in the body. Also called tumor load.
  tumor debulking: (TOO-mer dee-BUL-king)
    Pronunciation of dictionary term "tumor debulking"
    Surgical removal of as much of a tumor as possible. Tumor debulking may increase the chance that chemotherapy or radiation therapy will kill all the tumor cells. It may also be done to relieve symptoms or help the patient live longer. Also called debulking.
  tumor DNA sequencing: (TOO-mer ... SEE-kwen-sing)
    Pronunciation of dictionary term "tumor DNA sequencing"
    A laboratory method used to learn the exact order (sequence) of the chemical building blocks that make up tumor DNA. Errors in the sequence of the building blocks can cause cancer cells to grow and spread. Knowing the DNA sequence of a person’s tumor may help plan treatment that targets the specific error in the tumor.
  tumor grade: (TOO-mer grayd)
    Pronunciation of dictionary term "tumor grade"
    A description of a tumor based on how abnormal the cancer cells and tissue look under a microscope and how quickly the cancer cells are likely to grow and spread. Low-grade cancer cells look more like normal cells and tend to grow and spread more slowly than high-grade cancer cells. Grading systems are different for each type of cancer. They are used to help plan treatment and determine prognosis. Also called grade and histologic grade.
    More Information
    - Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis/tumor-grade-fact-sheet)
  tumor heterogeneity: (TOO-mer HEH-teh-roh-jeh-NEE-ih-tee)
    Pronunciation of dictionary term "tumor heterogeneity"
    A term that describes the differences between tumors of the same type in different patients, the differences between cancer cells within a single tumor, or the differences between a primary (original) tumor and a secondary tumor. These differences may involve the tumor’s genes and proteins. For example, some cancer cells in a tumor may have genetic mutations (changes) that aren’t present in other cancer cells in that tumor. Tumor heterogeneity can play an important role in how cancer is diagnosed and treated and how it responds to treatment.
  tumor initiation: (TOO-mer ih-NIH-shee-AY-shun)
    Pronunciation of dictionary term "tumor initiation"
    A process in which normal cells are changed so that they are able to form tumors. Substances that cause cancer can be tumor initiators.
  tumor load: (TOO-mer lode)
    Pronunciation of dictionary term "tumor load"
    Refers to the number of cancer cells, the size of a tumor, or the amount of cancer in the body. Also called tumor burden.
  tumor lysis syndrome: (TOO-mer LY-sis SIN-drome)
    Pronunciation of dictionary term "tumor lysis syndrome"
    A condition that can occur after treatment of a fast-growing cancer, especially certain leukemias and lymphomas (cancers of the blood). As tumor cells die, they break apart and release their contents into the blood. This causes a change in certain chemicals in the blood, which may cause damage to organs, including the kidneys, heart, and liver.
  tumor marker: (TOO-mer MAR-ker)
    Pronunciation of dictionary term "tumor marker"
    A substance found in tissue, blood, bone marrow, or other body fluids that may be a sign of cancer or certain benign (noncancer) conditions. Many tumor markers are proteins made by both normal cells and cancer cells, but they are made in higher amounts by cancer cells. Genetic changes in tumor tissue, such as gene mutations, patterns of gene expression, and other changes in tumor DNA or RNA, are also being used as tumor markers. A tumor marker may be used with other tests to help diagnose cancer. It may also be used to help plan treatment, give a likely prognosis, and find out how well treatment is working or if cancer has come back. Examples of tumor markers include CA-125 (in ovarian cancer), estrogen receptor and progesterone receptor (in breast cancer), CEA (in colon cancer), PCA3 mRNA and PSA (in prostate cancer), and EGFR gene mutation (in non-small cell lung cancer).
    More Information
    - Tumor Markers (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-markers-fact-sheet)
  tumor marker test: (TOO-mer MAR-ker ...)
    Pronunciation of dictionary term "tumor marker test"
    A test that measures the amount of substances called tumor markers in tissue, blood, urine, or other body fluids. Most tumor markers are proteins made by both normal cells and cancer cells, but they are made in higher amounts by cancer cells. Genetic changes in tumor tissue, such as gene mutations, patterns of gene expression, and other changes in tumor DNA, are also being used as tumor markers. A tumor marker test is usually done with other tests, such as biopsies or imaging, to help diagnose some types of cancer. It may also be used to help plan treatment or find out how well treatment is working, give a likely prognosis, or find out if cancer has come back or spread to other parts of the body.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  tumor microenvironment: (TOO-mer MY-kroh-en-VY-run-ment)
    Pronunciation of dictionary term "tumor microenvironment"
    The normal cells, molecules, and blood vessels that surround and feed a tumor cell. A tumor can change its microenvironment, and the microenvironment can affect how a tumor grows and spreads.
  tumor model: (TOO-mer MAH-dul)
    Pronunciation of dictionary term "tumor model"
    Cells, tissues, or animals used to study the development and progression of cancer, and to test new treatments before they are given to humans. Animals with transplanted human tumors or other tissues are called xenograft models.
  tumor mutational burden: (TOO-mer myoo-TAY-shuh-nul BUR-den)
    Pronunciation of dictionary term "tumor mutational burden"
    The total number of mutations (changes) found in the DNA of cancer cells. Knowing the tumor mutational burden may help plan the best treatment. For example, tumors that have a high number of mutations appear to be more likely to respond to certain types of immunotherapy. Tumor mutational burden is being used as a type of biomarker. Also called TMB.
  tumor necrosis factor: (TOO-mer neh-KROH-sis FAK-ter)
    Pronunciation of dictionary term "tumor necrosis factor"
    A protein made by white blood cells in response to an antigen (substance that causes the immune system to make a specific immune response) or infection. Tumor necrosis factor can also be made in the laboratory. It may boost a person’s immune response, and also may cause necrosis (cell death) of some types of tumor cells. Tumor necrosis factor is being studied in the treatment of some types of cancer. It is a type of cytokine. Also called TNF.
  tumor necrosis factor receptor superfamily member 10A: (TOO-mer neh-KROH-sis FAK-ter reh-SEP-ter SOO-per FA-mih-lee …)
    Pronunciation of dictionary term "tumor necrosis factor receptor superfamily member 10A"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of tumor necrosis factor receptor superfamily member 10A on cancer cells may kill more cells. Also called death receptor 4, DR4, TRAIL receptor 1, and TRAIL-R1.
  tumor necrosis factor receptor superfamily member 10B: (TOO-mer neh-KROH-sis FAK-ter reh-SEP-ter SOO-per FA-mih-lee …)
    Pronunciation of dictionary term "tumor necrosis factor receptor superfamily member 10B"
    A protein on the surface of certain cells that binds another protein called TRAIL, which may kill some cancer cells. An increase in the amount or activity of tumor necrosis factor receptor superfamily member 10B on cancer cells may kill more cells. Also called death receptor 5, DR5, TRAIL receptor 2, and TRAIL-R2.
  tumor necrosis factor-related apoptosis-inducing ligand: (TOO-mer neh-KROH-sis FAK-ter-ree-LAY-ted A-pop-TOH-sis-in-DOO-sing LIH-gund)
    Pronunciation of dictionary term "tumor necrosis factor-related apoptosis-inducing ligand"
    A cell protein that can attach to certain molecules in some cancer cells and may kill the cells. Tumor necrosis factor-related apoptosis-inducing ligand is being studied in the treatment of cancer. Also called Apo-2L, TNF-related apoptosis-inducing ligand, and TRAIL.
  tumor profiling: (TOO-mer PROH-fy-ling)
    Pronunciation of dictionary term "tumor profiling"
    A laboratory method that checks for the presence of certain genes, proteins, or other molecules in a sample of blood or tumor tissue. Tumor profiling may provide information about certain molecular or genetic changes in a tumor, such as gene mutations or other changes in tumor DNA. It may be used to help plan treatment or predict whether cancer will come back or spread to other parts of the body.
    More Information
    - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  tumor promotion: (TOO-mer proh-MOH-shun)
    Pronunciation of dictionary term "tumor promotion"
    A process in which existing tumors are stimulated to grow. Tumor promoters are not able to cause tumors to form.
  tumor protein p53 gene: (TOO-mer PROH-teen ... jeen)
    Pronunciation of dictionary term "tumor protein p53 gene"
    A gene that makes a protein that is found inside the nucleus of cells and plays a key role in controlling cell division and cell death. Mutations (changes) in the tumor protein p53 gene may cause cancer cells to grow and spread in the body. These changes have been found in a genetic condition called Li-Fraumeni syndrome and in many types of cancer. The tumor protein p53 gene is a type of tumor suppressor gene. Also called p53 gene and TP53 gene.
  tumor suppressor gene: (TOO-mer suh-PREH-ser jeen)
    Pronunciation of dictionary term "tumor suppressor gene"
    A type of gene that makes a protein called a tumor suppressor protein that helps control cell growth. Mutations (changes in DNA) in tumor suppressor genes may lead to cancer. Also called antioncogene.
    More Information
    - Tumor Suppressor Gene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Tumor-Suppressor-Gene)
  tumor vasculature–targeted tumor necrosis factor alpha: (TOO-mer VAS-kyoo-luh-cher-TAR-geh-ted TOO-mer neh-KROH-sis FAK-ter AL-fuh)
    Pronunciation of dictionary term "tumor vasculature–targeted tumor necrosis factor alpha"
    A substance being studied in the treatment of cancer. It is made by linking tumor necrosis factor (TNF) to a peptide. The peptide binds to tumor blood vessels, and TNF damages them. It is a type of biological response modifier. Also called NGR-TNF.
  tumor volume: (TOO-mer VOL-yoom)
    Pronunciation of dictionary term "tumor volume"
    The size of a cancer measured by the amount of space taken up by the tumor. For example, the tumor volume of prostate cancer is the percentage of the prostate taken up by the tumor.
  tumor-agnostic therapy: (TOO-mer-ag-NAH-stik THAYR-uh-pee)
    Pronunciation of dictionary term "tumor-agnostic therapy"
    A type of therapy that uses drugs or other substances to treat cancer based on the cancer’s genetic and molecular features without regard to the cancer type or where the cancer started in the body. Tumor-agnostic therapy uses the same drug to treat all cancer types that have the genetic mutation (change) or biomarker that is targeted by the drug. It is a type of targeted therapy. Also called tissue-agnostic therapy.
  tumor-derived: (TOO-mer-deh-RIVED)
    Pronunciation of dictionary term "tumor-derived"
    Taken from an individual's own tumor tissue; may be used in the development of a vaccine that enhances the body's ability to build an immune response to the tumor.
  tumor-infiltrating lymphocyte: (TOO-mer-IN-fil-TRAY-ting LIM-foh-site)
    Pronunciation of dictionary term "tumor-infiltrating lymphocyte"
    A type of immune cell that has moved from the blood into a tumor. Tumor-infiltrating lymphocytes can recognize and kill cancer cells. In cancer therapy, tumor-infiltrating lymphocytes are removed from a patient’s tumor, grown in large numbers in a laboratory, and then given back to the patient to help the immune system kill the cancer cells. Also called TIL.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
  tumor-infiltrating lymphocyte therapy: (TOO-mer-IN-fil-TRAY-ting LIM-foh-site THAYR-uh-pee)
    Pronunciation of dictionary term "tumor-infiltrating lymphocyte therapy"
    A type of treatment in which tumor-infiltrating lymphocytes (a type of immune cell that can recognize and kill cancer cells) are removed from a patient’s tumor and grown in large numbers in a laboratory. These lymphocytes are then given back to the patient by infusion to help the immune system kill the cancer cells. Also called TIL therapy.
    More Information
    - T-cell Transfer Therapy (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/t-cell-transfer-therapy)
  tumor-specific antigen: (TOO-mer-speh-SIH-fik AN-tih-jen)
    Pronunciation of dictionary term "tumor-specific antigen"
    A protein or other molecule that is found only on cancer cells and not on normal cells. Tumor-specific antigens can help the body make an immune response against cancer cells. They may be used as possible targets for targeted therapy or for immunotherapy to help boost the body’s immune system to kill more cancer cells. Tumor-specific antigens may also be used in laboratory tests to help diagnose some types of cancer.
  TUMT: A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra into the bladder. A small microwave antenna on the instrument heats nearby prostate tissue and destroys it. This relieves pressure and improves urine flow. Also called transurethral microwave thermotherapy.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  TUNA: A procedure that is used to treat benign prostatic hypertrophy (BPH). An instrument with a small probe that gives off low-level radiofrequency energy is inserted through the urethra into the prostate. The energy from the probe heats nearby prostate tissue and destroys it. This relieves pressure and improves urine flow. Also called transurethral needle ablation and transurethral radiofrequency ablation.
    More Information
    - Understanding Prostate Changes and Conditions (https://www.cancer.gov/types/prostate/understanding-prostate-changes)
  TUR: Surgery performed with a special instrument inserted through the urethra. Also called transurethral resection.
  Turalio: (tur-A-lee-oh)
    Pronunciation of dictionary term "Turalio"
    A drug used to treat adults with tenosynovial giant cell tumor (a rare, usually benign tumor that affects the joints). It is used in patients who have a severe form of the disease that is not likely to get better with surgery. It is also being studied in the treatment of some types of cancer and other conditions. Turalio blocks certain proteins, which may help keep tumor cells from growing and spreading. It is a type of tyrosine kinase inhibitor. Also called pexidartinib hydrochloride.
    More Information
    - Pexidartinib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/pexidartinib)
  Turcot syndrome: (ter-KOH SIN-drome)
    Pronunciation of dictionary term "Turcot syndrome"
    A rare, inherited disorder in which polyps (abnormal growths of tissue) form on the inside walls of the colon and rectum, and tumors form in the brain. There are two types of Turcot syndrome, which are caused by mutations (changes) in different genes. People with Turcot syndrome have a higher-than-normal risk of colorectal cancer and brain cancer, especially glioblastoma and medulloblastoma.
    More Information
    - Turcot syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/420/turcot-syndrome)
  Turkish rhubarb: (... ROO-barb)
    Pronunciation of dictionary term "Turkish rhubarb"
    The root of this plant has been used in some cultures to treat certain medical problems. It may have anti-inflammatory and anticancer effects. The scientific name is Rheum palmatum or Rheum officinale. Also called Chinese rhubarb, da-huang, Indian rhubarb, and rhubarb.
  turmeric: (TER-mayr-ik)
    Pronunciation of dictionary term "turmeric"
    An East Indian plant that is a member of the ginger family and is used as a spice and food color. It is a major ingredient found in curry powder. The underground stem of the turmeric plant has been used for many years in traditional Asian medicine to treat certain conditions. The substance in turmeric that gives it a yellow color is called curcumin, which may have antioxidant and anti-inflammatory effects in the body. Turmeric can be made into a capsule, tablet, extract, powder, or tea and taken by mouth as a dietary supplement. It can also be made into a paste to treat skin conditions. Turmeric is being studied in the prevention and treatment of some types of cancer. Its scientific name is Curcuma longa. Also called Indian saffron and jiang huang.
    More Information
    - Curcumin (Curcuma, Turmeric) and Cancer
  Turner syndrome: (TER-ner SIN-drome)
    Pronunciation of dictionary term "Turner syndrome"
    A genetic condition that occurs in females who have a missing or abnormal X chromosome (sex chromosome). Turner syndrome is marked by a shorter-than-average height, ovaries that do not function normally, and infertility. Other signs and symptoms may include extra folds of skin on the neck, a low hairline at the back of the neck, swelling of the hands and feet, and heart, kidney, bone, and hearing problems. Turner syndrome is present at birth but its signs and symptoms may occur slowly over time. Having Turner syndrome increases the risk of germ cell tumors in the ovaries.
    More Information
    - Turner syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7831/turner-syndrome)
    - Turner syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/turner-syndrome/)
  TURP: Surgery to remove tissue from the prostate using an instrument inserted through the urethra. Also called transurethral resection of the prostate.
    Transurethral resection of the prostate (TURP). Tissue is removed from the prostate using a resectoscope (a thin, lighted tube with a cutting tool at the end) inserted through the urethra. Prostate tissue that is blocking the urethra is cut away and removed through the resectoscope.
    Transurethral resection of the prostate; drawing shows removal of tissue from the prostate using a resectoscope (a thin, lighted tube with a cutting tool at the end) inserted through the urethra.
  TUVP: A procedure used to treat benign prostatic hypertrophy (BPH). An instrument is inserted through the urethra into the prostate. A ball or special wire loop on the instrument heats the prostate tissue and turns it to vapor. This relieves pressure and improves urine flow. Also called transurethral electroevaporation of the prostate, transurethral electrovaporization of the prostate, and TUEVAP.
  TVS: A procedure used to examine the vagina, uterus, fallopian tubes, ovaries, and bladder. An instrument is inserted into the vagina that causes sound waves to bounce off organs inside the pelvis. These sound waves create echoes that are sent to a computer, which creates a picture called a sonogram. Also called transvaginal sonography and transvaginal ultrasound.
    Transvaginal ultrasound. An ultrasound probe connected to a computer is inserted into the vagina and is gently moved to show different organs. The probe bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
    Transvaginal ultrasound; drawing shows a side view of the female reproductive anatomy during a transvaginal ultrasound procedure. An ultrasound probe (a device that makes sound waves that bounce off tissues inside the body) is shown inserted into the vagina. The bladder, uterus, right fallopian tube, and right ovary are also shown. The inset shows the diagnostic sonographer (a person trained to perform ultrasound procedures) examining a woman on a table, and a computer screen shows an image of the patient’s internal tissues.
  twelve-step program: (... PROH-gram)
    Pronunciation of dictionary term "twelve-step program"
    A program to help people recover from substance abuse, emotional disorders, or addictions. The twelve steps come from an organization called Alcoholics Anonymous (AA) and are changed for each specific condition.
  Tykerb: (TY-kerb)
    Pronunciation of dictionary term "Tykerb"
    A drug used with capecitabine or letrozole to treat certain types of HER2-positive breast cancer that are advanced or have spread. It is also being studied in the treatment of other types of cancer. Tykerb blocks EGFR and other proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called GW572016 and lapatinib ditosylate.
    More Information
    - Lapatinib Ditosylate (https://www.cancer.gov/about-cancer/treatment/drugs/lapatinibditosylate)
  tympanites: (TIM-puh-NY-teez)
    Pronunciation of dictionary term "tympanites"
    Swelling of the abdomen caused by gas in the intestines or peritoneal cavity. Also called meteorism.
  type 2 diabetes mellitus: (… dy-uh-BEE-teez MEH-lih-tus)
    Pronunciation of dictionary term "type 2 diabetes mellitus"
    A disease in which glucose levels in the blood are higher than normal because the body does not make enough insulin or use it the way it should. Type 2 diabetes is a chronic disease and usually develops slowly over time. Having type 2 diabetes increases the risk of developing many other health problems, such as heart disease, stroke, nerve damage, eye disease, kidney disease, foot problems, gum disease and other dental problems, and sexual and bladder problems. Certain health conditions, such as overweight, obesity, prediabetes, high blood pressure, abnormal cholesterol levels, and polycystic ovary syndrome, increase a person’s risk of type 2 diabetes. People who had diabetes during pregnancy or birthed a baby who weighed more than 9 pounds are also at risk. Other risk factors include being 45 years or older, not getting enough exercise, being a member of certain racial and ethnic groups, and having a parent, brother, or sister with type 2 diabetes. There is no cure for type 2 diabetes, but certain medicines and behavioral changes, such as losing extra weight, eating a healthy diet, and getting regular exercise, can help control blood sugar levels and manage the disease.
    More Information
    - Type 2 Diabetes (https://www.niddk.nih.gov/health-information/diabetes/overview/what-is-diabetes/type-2-diabetes)
    - Type 2 diabetes (MedlinePlus) (https://medlineplus.gov/ency/article/000313.htm)
  type 3 serotonin receptor antagonist: (tipe 3 SAYR-uh-TOH-nin reh-SEP-ter an-TA-guh-nist)
    Pronunciation of dictionary term "type 3 serotonin receptor antagonist"
    A type of drug used to treat certain types of irritable bowel syndrome and relieve nausea and vomiting. It is a type of antiemetic. Also called 5-HT3 receptor antagonist and 5-hydroxytryptamine 3 receptor antagonist.
  type C thymoma: (tipe C thy-MOH-muh)
    Pronunciation of dictionary term "type C thymoma"
    A rare type of thymus gland cancer. It usually spreads, has a high risk of recurrence, and has a poor survival rate. Thymic carcinoma is divided into subtypes, depending on the types of cells in which the cancer began. Also called thymic carcinoma.
    More Information
    - Thymoma and Thymic Carcinoma (https://www.cancer.gov/types/thymoma)
  TYR gene: (… jeen)
    Pronunciation of dictionary term "TYR gene"
    A gene that makes a protein involved in making melanin (a pigment that gives color to the skin, hair, and eyes). Mutations (changes) in the TYR gene have been found in an inherited condition called oculocutaneous albinism. People with this condition have very pale skin and light-colored hair and eyes. They also have a high risk of developing skin cancer at an early age.
    More Information
    - TYR gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/tyr/)
  tyrosinase peptide: (ty-RAH-sih-NAYS PEP-tide)
    Pronunciation of dictionary term "tyrosinase peptide"
    A protein that is made from tumor cells and is used in a vaccine against melanoma. A tyrosinase peptide vaccine may stimulate the body's immune system to find and kill melanoma cells.
  tyrosine kinase inhibitor: (TY-ruh-seen KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "tyrosine kinase inhibitor"
    A substance that blocks the action of enzymes called tyrosine kinases. Tyrosine kinases are a part of many cell functions, including cell signaling, growth, and division. These enzymes may be too active or found at high levels in some types of cancer cells, and blocking them may help keep cancer cells from growing. Some tyrosine kinase inhibitors are used to treat cancer. They are a type of targeted therapy.
  tyrosine kinase inhibitor BIBF 1120: (TY-ruh-seen KY-nays in-HIH-bih-ter...)
    Pronunciation of dictionary term "tyrosine kinase inhibitor BIBF 1120"
    A substance being studied in the treatment of some types of cancer. Tyrosine kinase inhibitor BIBF 1120 blocks enzymes needed for cells to grow, and may prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called BIBF 1120.
  tyrosinemia: (TY-roh-sih-NEE-mee-uh)
    Pronunciation of dictionary term "tyrosinemia"
    A rare, inherited disorder marked by high blood levels of a protein building block called tyrosine. This can cause a harmful buildup of tyrosine and other substances in the body’s tissues and organs, especially in the liver, kidney, and nervous system. This can lead to serious medical problems and may increase the risk of liver cancer. Tyrosinemia is caused by mutations (changes) in certain genes that make enzymes needed to break down tyrosine.
    More Information
    - Tyrosinemia type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/2658/tyrosinemia-type-1)
    - Tyrosinemia (MedlinePlus) (https://medlineplus.gov/genetics/condition/tyrosinemia/)
  TYRP1 gene: (… jeen)
    Pronunciation of dictionary term "TYRP1 gene"
    A gene that makes a protein involved in making melanin (a pigment that gives color to skin, hair, and eyes). Mutations (changes) in the TYRP1 gene have been found in an inherited condition called oculocutaneous albinism. People with this condition have very pale skin and light-colored hair and eyes. They also have a high risk of developing skin cancer at an early age.
    More Information
    - TYRP1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/tyrp1/)
  TZT-1027: A substance being studied in the treatment of cancer. It is a type of tubulin inhibitor. Also called soblidotin.
  u-plasminogen activator: (u-plaz-MIH-noh-jen AK-tih-vay-ter)
    Pronunciation of dictionary term "u-plasminogen activator"
    An enzyme that is made in the kidney and found in the urine. A form of this enzyme is made in the laboratory and used to dissolve blood clots or to prevent them from forming. Also called uPA, urokinase, and urokinase-plasminogen activator.
  ubiquinone: (yoo-BIH-kwih-NONE)
    Pronunciation of dictionary term "ubiquinone"
    A nutrient that the body needs in small amounts to function and stay healthy. Ubiquinone helps mitochondria (small structures in the cell) make energy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). Ubiquinone is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, beef, soybeans, peanuts, and spinach. It is being studied in the prevention and treatment of some types of cancer and heart disease and in the relief of side effects caused by some cancer treatments. Also called coenzyme Q10, CoQ10, Q10, and vitamin Q10.
    More Information
    - Coenzyme Q10
  UCN-01: An anticancer drug that belongs to the family of drugs called staurosporine analogs.
  Udenyca: (yoo-DEH-nih-kah)
    Pronunciation of dictionary term "Udenyca"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Udenyca helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called filgrastim-SD/01, Fulphila, Neulasta, Nyvepria, pegfilgrastim, and Ziextenzo.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  UFT: A substance being studied in the treatment of some types of cancer. It is a combination of tegafur and uracil. The tegafur is taken up by the cancer cells and breaks down into 5-FU, a substance that kills tumor cells. The uracil causes higher amounts of 5-FU to stay inside the cells and kill them. UFT is a type of antimetabolite. Also called Ftorafur and tegafur-uracil.
  UGT1A1: A substance that is being studied as a treatment for cancer. It is an enzyme produced by the liver and intestine.
  Ukoniq: (yoo-KAH-nik)
    Pronunciation of dictionary term "Ukoniq"
    A drug used to treat adults with marginal zone lymphoma or follicular lymphoma that relapsed (came back) or did not get better after treatment with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Ukoniq blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called umbralisib tosylate.
    More Information
    - Umbralisib Tosylate
  ulcer: (UL-ser)
    Pronunciation of dictionary term "ulcer"
    A break on the skin, in the lining of an organ, or on the surface of a tissue. An ulcer forms when the surface cells become inflamed, die, and are shed. Ulcers may be linked to cancer and other diseases.
  ulceration: (UL-seh-RAY-shun)
    Pronunciation of dictionary term "ulceration"
    The formation of a break on the skin or on the surface of an organ. An ulcer forms when the surface cells die and are cast off. Ulcers may be associated with cancer and other diseases.
  ulcerative colitis: (UL-seh-RUH-tiv koh-LY-tis)
    Pronunciation of dictionary term "ulcerative colitis"
    Chronic inflammation of the colon that produces ulcers in its lining. This condition is marked by abdominal pain, cramps, and loose discharges of pus, blood, and mucus from the bowel.
  Ulmus fulva: (UL-mus FUL-vuh)
    Pronunciation of dictionary term "Ulmus fulva"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called gray elm, Indian elm, red elm, slippery elm, sweet elm, and Ulmus rubra.
  Ulmus rubra: (UL-mus ROO-bruh)
    Pronunciation of dictionary term "Ulmus rubra"
    The inner bark of this plant has been used in some cultures to treat certain medical problems. It may have antioxidant effects. Also called gray elm, Indian elm, red elm, slippery elm, sweet elm, and Ulmus fulva.
  Ultomiris: (UL-toh-MEER-is)
    Pronunciation of dictionary term "Ultomiris"
    A drug used to treat adults with paroxysmal nocturnal hemoglobinuria (a rare red blood cell disorder) and adults and children aged 1 month and older with atypical hemolytic uremic syndrome (a very rare disorder in which tiny blood clots form in small blood vessels). It is also being studied in the treatment of other conditions. Ultomiris binds to an immune system protein called C5. This may help keep red blood cells from breaking down and blood clots from forming. Ultomiris is a type of monoclonal antibody. Also called ravulizumab.
    More Information
    - Ravulizumab-cwvz (https://www.cancer.gov/about-cancer/treatment/drugs/ravulizumab-cwvz)
  ultra light cigarette: (UL-truh lite SIH-guh-ret)
    Pronunciation of dictionary term "ultra light cigarette"
    A type of cigarette that is claimed to give off less tobacco tar than a regular or light (“low-tar”) cigarette when smoked. Ultra light cigarettes have been shown to be no safer than regular cigarettes, and smoking them does not lower the risk of cancer or other diseases. A person smoking an ultra light cigarette can inhale the same amount of tobacco tar, nicotine, and harmful, cancer-causing chemicals as in a regular cigarette, depending on how the cigarette is smoked. Cigarettes are no longer allowed to be labeled or advertised as ultra light cigarettes.
    More Information
    - "Light" Cigarettes and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/light-cigarettes-fact-sheet)
  Ultram: (UL-tram)
    Pronunciation of dictionary term "Ultram"
    A drug used to treat moderate to severe pain in adults. It binds to opioid receptors in the central nervous system. Ultram is a type of analgesic agent and a type of opioid. Also called tramadol hydrochloride.
  ultrasonogram: (UL-truh-SAH-noh-gram)
    Pronunciation of dictionary term "ultrasonogram"
    A computer picture of areas inside the body created by high-energy sound waves. The sound waves are bounced off internal tissues or organs and make echoes. The echoes form a picture of the body tissues on a computer screen. An ultrasonogram may be used to help diagnose disease, such as cancer. It may also be used during pregnancy to check the fetus (unborn baby) and during medical procedures, such as biopsies. Also called sonogram.
  ultrasonography: (UL-truh-soh-NAH-gruh-fee)
    Pronunciation of dictionary term "ultrasonography"
    A procedure that uses high-energy sound waves to look at tissues and organs inside the body. The sound waves make echoes that form pictures of the tissues and organs on a computer screen (sonogram). Ultrasonography may be used to help diagnose diseases, such as cancer. It may also be used during pregnancy to check the fetus (unborn baby) and during medical procedures, such as biopsies. Also called ultrasound.
  ultrasound: (UL-truh-sownd)
    Pronunciation of dictionary term "ultrasound"
    A procedure that uses high-energy sound waves to look at tissues and organs inside the body. The sound waves make echoes that form pictures of the tissues and organs on a computer screen (sonogram). Ultrasound may be used to help diagnose diseases, such as cancer. It may also be used during pregnancy to check the fetus (unborn baby) and during medical procedures, such as biopsies. Also called ultrasonography.
  ultrasound biomicroscopy: (UL-truh-sownd BY-oh-my-KROS-koh-pee)
    Pronunciation of dictionary term "ultrasound biomicroscopy"
    A type of ultrasound eye exam that makes a more detailed image than regular ultrasound. High-energy sound waves are bounced off the inside of the eye and the echo patterns are shown on the screen of an ultrasound machine. This makes a picture called a sonogram.
  ultrasound energy: (UL-truh-sownd EH-ner-jee)
    Pronunciation of dictionary term "ultrasound energy"
    A form of therapy being studied as an anticancer treatment. Intensified ultrasound energy can be directed at cancer cells to heat them and kill them.
  ultrasound transducer: (UL-truh-sownd tranz-DOO-ser)
    Pronunciation of dictionary term "ultrasound transducer"
    A device that produces sound waves that bounce off body tissues and make echoes. The transducer also receives the echoes and sends them to a computer that uses them to create a picture called a sonogram. Transducers (probes) come in different shapes and sizes for use in making pictures of different parts of the body. The transducer may be passed over the surface of the body or inserted into an opening such as the rectum or vagina.
  ultrasound-guided biopsy: (UL-truh-sownd-GY-ded BY-op-see)
    Pronunciation of dictionary term "ultrasound-guided biopsy"
    A biopsy procedure that uses an ultrasound imaging device to find an abnormal area of tissue and guide its removal for examination under a microscope.
  ultraviolet A radiation: (UL-truh-VY-oh-let A RAY-dee-AY-shun)
    Pronunciation of dictionary term "ultraviolet A radiation"
    Invisible rays that are part of the energy that comes from the sun. Ultraviolet A radiation also comes from sun lamps and tanning beds. Ultraviolet A radiation may cause premature aging of the skin and skin cancer. It may also cause problems with the eyes and the immune system. Skin specialists recommend that people use sunscreens that protect the skin from ultraviolet radiation. In medicine, ultraviolet A radiation also comes from special lamps or a laser and is used to treat certain skin conditions such as psoriasis, vitiligo, and skin tumors of cutaneous T-cell lymphoma. Also called UVA radiation.
  ultraviolet B radiation: (UL-truh-VY-oh-let B RAY-dee-AY-shun)
    Pronunciation of dictionary term "ultraviolet B radiation"
    Invisible rays that are part of the energy that comes from the sun. Ultraviolet B radiation causes sunburn, darkening and thickening of the outer layer of the skin, and melanoma and other types of skin cancer. It may also cause problems with the eyes and the immune system. Skin specialists recommend that people use sunscreens that protect the skin from ultraviolet radiation. In medicine, ultraviolet B radiation also comes from special lamps or a laser and is used to treat certain skin conditions such as psoriasis, vitiligo, and skin tumors of cutaneous T-cell lymphoma. Also called UVB radiation.
  ultraviolet C radiation: (UL-truh-VY-oh-let C RAY-dee-AY-shun)
    Pronunciation of dictionary term "ultraviolet C radiation"
    Invisible rays that are part of the energy that comes from the sun. Most ultraviolet C radiation from the sun is blocked from the Earth’s surface by the ozone layer. In medicine, ultraviolet C radiation may also come from special lamps or a laser and is used to kill germs or to help heal wounds. It is also used to treat certain skin conditions such as psoriasis, vitiligo, and skin nodules of cutaneous T-cell lymphoma Also called UVC radiation.
  ultraviolet radiation: (UL-truh-VY-oh-let RAY-dee-AY-shun)
    Pronunciation of dictionary term "ultraviolet radiation"
    Invisible rays that are part of the energy that comes from the sun. Ultraviolet radiation that reaches the Earth's surface is made up of two types of rays, called UVA and UVB. Ultraviolet radiation also comes from sun lamps and tanning beds. It can cause skin damage, premature aging, melanoma, and other types of skin cancer. It can also cause problems with the eyes and the immune system. Skin specialists recommend that people use sunscreens that protect the skin from both kinds of ultraviolet radiation. In medicine, ultraviolet radiation also comes from special lamps or a laser and is used to treat certain skin conditions such as psoriasis, vitiligo, and skin tumors of cutaneous T-cell lymphoma. Also called UV radiation.
    More Information
    - Skin Cancer Prevention
    - Sunlight (https://www.cancer.gov/about-cancer/causes-prevention/risk/sunlight)
  ultraviolet radiation therapy: (UL-truh-VY-oh-let RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "ultraviolet radiation therapy"
    A form of radiation used in the treatment of cancer.
  umbilical cord blood: (um-BIH-lih-kul KORD blud)
    Pronunciation of dictionary term "umbilical cord blood"
    Blood from the umbilical cord of a newborn baby. This blood contains high concentrations of stem cells (cells from which all blood cells develop).
  umbilical cord blood transplantation: (um-BIH-lih-kul kord blud tranz-plan-TAY-shun)
    Pronunciation of dictionary term "umbilical cord blood transplantation"
    The injection of umbilical cord blood to restore an individual's own blood production system suppressed by anticancer drugs, radiation therapy, or both. It is being studied in the treatment of cancer and severe blood disorders such as aplastic anemia. Cord blood contains high concentrations of stem cells (cells from which all blood cells develop).
  umbralisib tosylate: (UM-brah-LIH-sib TOH-suh-layt)
    Pronunciation of dictionary term "umbralisib tosylate"
    A drug used to treat adults with marginal zone lymphoma or follicular lymphoma that relapsed (came back) or did not get better after treatment with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Umbralisib tosylate blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called Ukoniq.
    More Information
    - Umbralisib Tosylate
  umbrella trial: (um-BREH-luh TRY-ul)
    Pronunciation of dictionary term "umbrella trial"
    A type of clinical trial that tests how well new drugs or other substances work in patients who have the same type of cancer but different gene mutations (changes) or biomarkers. In umbrella trials, patients receive treatment based on the specific mutation or biomarker found in their cancer. The drugs being tested may change during the trial, as new targets and drugs are found. Umbrella trials may allow new drugs to be tested and approved more quickly than traditional clinical trials.
  unaffected individual: (UN-uh-FEK-ted in-dih-VIH-joo-wul)
    Pronunciation of dictionary term "unaffected individual"
    In genetics, a term used to describe a person who does not have a certain genetic trait or disease.
  unclassified sarcoma: (un-KLA-sih-fide sar-KOH-muh)
    Pronunciation of dictionary term "unclassified sarcoma"
    A group of rare cancers that do not look like other types of sarcomas under a microscope and may be hard to diagnose. They usually form in the muscles that are attached to bones and that help the body move. Unclassified sarcomas tend to grow quickly and spread to other parts of the body. Some types of unclassified sarcomas may form in a part of the body where a patient had radiation therapy in the past. An unclassified sarcoma is a type of soft tissue sarcoma. Also called undifferentiated sarcoma.
  unclassified variant: (un-KLA-sih-fide VAYR-ee-unt)
    Pronunciation of dictionary term "unclassified variant"
    A change in a gene’s DNA sequence that has an unknown effect on a person’s health. There is usually not enough information about an unclassified variant to know whether it increases a person’s risk of developing a disease, such as cancer. Also called variant of uncertain significance, variant of unknown significance, and VUS.
  uncontrolled study: (UN-kun-TROLD STUH-dee)
    Pronunciation of dictionary term "uncontrolled study"
    A clinical study that lacks a comparison (i.e., a control) group.
  unconventional cancer treatments: (UN-kun-VEN-shuh-nul KAN-ser TREET-ments)
    Pronunciation of dictionary term "unconventional cancer treatments"
    Approaches that use substances or methods of treating cancer that have not been shown to be effective by accepted scientific methods, such as carefully designed clinical trials.
  underactive thyroid: (... THY-royd)
    Pronunciation of dictionary term "underactive thyroid"
    Too little thyroid hormone. Symptoms include weight gain, constipation, dry skin, and sensitivity to the cold. Also called hypothyroidism.
  undescended testicles: (UN-deh-SEN-ded TES-tih-kuls)
    Pronunciation of dictionary term "undescended testicles"
    A condition in which one or both testicles fail to move from the abdomen, where they develop before birth, into the scrotum. Undescended testicles may increase the risk for development of testicular cancer. Also called cryptorchidism.
  undifferentiated: (un-DIH-feh-REN-shee-AY-ted)
    Pronunciation of dictionary term "undifferentiated"
    A term used to describe cells or tissues that do not have specialized ("mature") structures or functions. Undifferentiated cancer cells often grow and spread quickly.
  undifferentiated pleomorphic sarcoma: (un-DIH-feh-REN-shee-AY-ted PLEE-oh-MOR-fik sar-KOH-muh)
    Pronunciation of dictionary term "undifferentiated pleomorphic sarcoma"
    A type of cancer that usually forms in the soft tissue, but it may also form in bone. It can occur anywhere in the body, but it usually occurs in the legs (especially the thighs), arms, or back of the abdomen. It may also occur in a part of the body where a patient received radiation therapy in the past. Undifferentiated pleomorphic sarcomas often grow quickly and spread to other parts of the body, including the lungs. They usually occur in older adults, and they may sometimes occur as a second cancer in patients who had retinoblastoma. Also called malignant fibrous cytoma and malignant fibrous histiocytoma.
    More Information
    - Osteosarcoma Treatment
  undifferentiated sarcoma: (un-DIH-feh-REN-shee-AY-ted sar-KOH-muh)
    Pronunciation of dictionary term "undifferentiated sarcoma"
    A group of rare cancers that do not look like other types of sarcomas under a microscope and may be hard to diagnose. They usually form in the muscles that are attached to bones and that help the body move. Undifferentiated sarcomas tend to grow quickly and spread to other parts of the body. Some types of undifferentiated sarcomas may form in a part of the body where a patient had radiation therapy in the past. An undifferentiated sarcoma is a type of soft tissue sarcoma. Also called unclassified sarcoma.
  unguent: (UNG-gwent)
    Pronunciation of dictionary term "unguent"
    A substance used on the skin to soothe or heal wounds, burns, rashes, scrapes, or other skin problems. Also called ointment.
  unilateral: (YOO-nih-LA-teh-rul)
    Pronunciation of dictionary term "unilateral"
    Having to do with one side of the body.
  unilateral salpingo-oophorectomy: (YOO-nih-LA-teh-rul sal-PIN-goh-oh-oh-foh-REK-toh-mee)
    Pronunciation of dictionary term "unilateral salpingo-oophorectomy"
    Surgery to remove the ovary and fallopian tube on one side of the body.
    Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
    Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
  United States Preventive Services Task Force: (yoo-NY-ted stayts pree-VEN-tiv SER-vih-ses …)
    Pronunciation of dictionary term "United States Preventive Services Task Force"
    A volunteer group of health experts who review published research and make recommendations about prevention health care methods such as screening tests, counseling, immunizations, and medicines. Before making a recommendation, the United States Preventive Services Task Force looks at the strength (scientific quality and correctness) of the evidence found in the research and the benefits and harms of each method being reviewed. Recommendations are made to help health care providers and patients decide whether a specific method is right for a patient’s needs. The recommendations may change as new research studies are published. Also called USPSTF.
    More Information
    - U.S. Preventive Services Task Force (https://www.uspreventiveservicestaskforce.org/uspstf/)
  Unituxin: (yoo-nih-TUK-sin)
    Pronunciation of dictionary term "Unituxin"
    A drug used with granulocyte-macrophage colony-stimulating factor (GM-CSF), aldesleukin (IL-2), and 13-cis-retinoic acid to treat children with high-risk neuroblastoma. It is used in patients whose disease has gotten better with other anticancer treatment. Unituxin binds to a substance called GD2, which is found on some types of cancer cells. Unituxin may block GD2 and help the immune system kill cancer cells. It is a type of monoclonal antibody. Also called Ch14.18, dinutuximab, MOAB Ch14.18, and monoclonal antibody Ch14.18.
    More Information
    - Dinutuximab (https://www.cancer.gov/about-cancer/treatment/drugs/dinutuximab)
  Unloxcyt: (un-LOK-sit)
    Pronunciation of dictionary term "Unloxcyt"
    A drug used to treat adults with cutaneous squamous cell carcinoma (a type of skin cancer) that has spread and cannot be cured with surgery or radiation therapy. It is also being studied in the treatment of other types of cancer. Unloxcyt binds to a protein called PD-L1, which is found on some normal cells and some types of cancer cells. Blocking this protein may help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called cosibelimab.
  unresectable: (UN-ree-SEK-tuh-bul)
    Pronunciation of dictionary term "unresectable"
    Unable to be removed with surgery.
  unresectable gallbladder cancer: (UN-ree-SEK-tuh-bul GAWL-bla-der KAN-ser)
    Pronunciation of dictionary term "unresectable gallbladder cancer"
    Cancer that has spread to the tissues around the gallbladder (such as the liver, stomach, pancreas, intestine, or lymph nodes in the area) and cannot be surgically removed.
  unresected: (UN-ree-SEK-ted)
    Pronunciation of dictionary term "unresected"
    Describes an organ, tissue, or cancer that has not been either partly or completely removed by surgery.
  unsealed internal radiation therapy: (...RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "unsealed internal radiation therapy"
    Radiation therapy given by injecting a radioactive substance into the bloodstream or a body cavity, or by swallowing it. This substance is not sealed in a container.
  uPA: An enzyme that is made in the kidney and found in the urine. A form of this enzyme is made in the laboratory and used to dissolve blood clots or to prevent them from forming. Also called u-plasminogen activator, urokinase, and urokinase-plasminogen activator.
  upper endoscopy: (UH-per en-DOS-koh-pee)
    Pronunciation of dictionary term "upper endoscopy"
    A procedure in which an endoscope is passed through the mouth and down the throat into esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is a thin tube with a light and a video camera attached. It may also have a tool to remove a sample of cells, tissue, or fluid so it can be checked under a microscope for signs of disease. An upper endoscopy may be used to help diagnose cancer and other conditions, such as Barrett esophagus (a precancerous condition), ulcers, gastroesophageal reflux disease, and celiac disease. It may also be used to remove polyps or other types of growths, stop bleeding caused by ulcers or other conditions, widen a narrow esophagus, place a feeding tube or drainage tube, or remove foreign objects. Also called EGD, esophagogastroduodenoscopy, upper gastrointestinal endoscopy, and upper GI endoscopy.
    Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.
    Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.
  upper extremity: (UH-per ek-STREH-mih-tee)
    Pronunciation of dictionary term "upper extremity"
    The part of the body that includes the arm, wrist, and hand.
  upper gastrointestinal endoscopy: (UH-per GAS-troh-in-TES-tih-nul en-DOS-koh-pee)
    Pronunciation of dictionary term "upper gastrointestinal endoscopy"
    A procedure in which an endoscope is passed through the mouth and down the throat into esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is a thin tube with a light and a video camera attached. It may also have a tool to remove a sample of cells, tissue, or fluid so it can be checked under a microscope for signs of disease. An upper gastrointestinal endoscopy may be used to help diagnose cancer and other conditions, such as Barrett esophagus (a precancerous condition), ulcers, gastroesophageal reflux disease, and celiac disease. It may also be used to remove polyps or other types of growths, stop bleeding caused by ulcers or other conditions, widen a narrow esophagus, place a feeding tube or drainage tube, or remove foreign objects. Also called EGD, esophagogastroduodenoscopy, upper endoscopy, and upper GI endoscopy.
    Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.
    Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.
  upper gastrointestinal series: (UH-per GAS-troh-in-TES-tih-nul SEER-eez)
    Pronunciation of dictionary term "upper gastrointestinal series"
    A series of x-ray pictures of the upper gastrointestinal (GI) tract, including the throat, esophagus, stomach, and the first part of the small intestine (duodenum). The x-ray pictures are taken after the patient drinks a liquid that contains barium sulfate (a silver-white metallic compound). The barium sulfate coats and outlines the inner walls of the upper GI tract so they can be seen on the x-ray pictures. Also called barium swallow and upper GI series.
    Barium swallow for esophageal cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as esophageal cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. The inset x-ray image shows a narrowing at the end of the esophagus caused by cancer.
    Barium swallow for stomach cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as stomach cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. Also shown is cancer in the stomach.
  upper GI endoscopy: (UH-per ... en-DOS-koh-pee)
    Pronunciation of dictionary term "upper GI endoscopy"
    A procedure in which an endoscope is passed through the mouth and down the throat into esophagus, stomach, and duodenum (first part of the small intestine) to check for abnormal areas. An endoscope is a thin tube with a light and a video camera attached. It may also have a tool to remove a sample of cells, tissue, or fluid so it can be checked under a microscope for signs of disease. An upper GI endoscopy may be used to help diagnose cancer and other conditions, such as Barrett esophagus (a precancerous condition), ulcers, gastroesophageal reflux disease, and celiac disease. It may also be used to remove polyps or other types of growths, stop bleeding caused by ulcers or other conditions, widen a narrow esophagus, place a feeding tube or drainage tube, or remove foreign objects. Also called EGD, esophagogastroduodenoscopy, upper endoscopy, and upper gastrointestinal endoscopy.
    Upper endoscopy. A thin, lighted tube called an endoscope is inserted through the mouth and down the throat to check for abnormal areas in the esophagus, stomach, and first part of the small intestine.
    Upper endoscopy; drawing shows an endoscope (a thin, lighted tube) inserted through the mouth and down the throat into the esophagus and stomach. An inset shows a patient on a table having an upper endoscopy.
  upper GI series: (UH-per ... SEER-eez)
    Pronunciation of dictionary term "upper GI series"
    A series of x-ray pictures of the upper gastrointestinal (GI) tract, including the throat, esophagus, stomach, and the first part of the small intestine (duodenum). The x-ray pictures are taken after the patient drinks a liquid that contains barium sulfate (a silver-white metallic compound). The barium sulfate coats and outlines the inner walls of the upper GI tract so they can be seen on the x-ray pictures. Also called barium swallow and upper gastrointestinal series.
    Barium swallow for esophageal cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as esophageal cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. The inset x-ray image shows a narrowing at the end of the esophagus caused by cancer.
    Barium swallow for stomach cancer. The patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats and outlines the inside of the esophagus and stomach. This allows abnormal areas, such as stomach cancer, to be seen on x-rays.
    Barium swallow; drawing shows barium liquid flowing down the esophagus and into the stomach. The barium coats and outlines the inside of the esophagus and stomach. Also shown is cancer in the stomach.
  upper jaw: (UH-per jaw)
    Pronunciation of dictionary term "upper jaw"
    The bones that form the upper part of the jaw, the roof of the mouth, and parts of the eye socket and nose. The upper jaw holds the top teeth in place and supports muscles involved in chewing and facial expressions. It is a major bone in the face. Also called maxilla.
  upregulation: (UP-reh-gyoo-LAY-shun)
    Pronunciation of dictionary term "upregulation"
    In biology, the process by which a cell increases its response to a substance or signal from outside the cell to carry out a specific function. For example, a cell may increase the number or activity of protein receptors or other molecules on its surface to make it more sensitive to a hormone or drug.
  upstaging: (up-STAY-jing)
    Pronunciation of dictionary term "upstaging"
    In cancer, changing the stage used to describe a patient’s cancer from a lower stage (less extensive) to a higher stage (more extensive). Upstaging is based on the results of additional staging tests. It is important to know the stage of the disease in order to plan the best treatment.
  urachus: (YOO-rah-kus)
    Pronunciation of dictionary term "urachus"
    A fibrous cord that connects the urinary bladder to the umbilicus (navel). The urachus is formed as the allantoic stalk during fetal development and lasts through life. Also called median umbilical ligament.
  uracil: (YOOR-uh-sil)
    Pronunciation of dictionary term "uracil"
    A chemical compound that is used to make one of the building blocks of RNA. It is a type of pyrimidine.
  urea: (yoo-REE-uh)
    Pronunciation of dictionary term "urea"
    A substance formed by the breakdown of protein in the liver. The kidneys filter urea out of the blood and into the urine. Urea can also be made in the laboratory. A topical form of urea is being studied in the treatment of hand-foot syndrome (pain, swelling, numbness, tingling, or redness of the hands or feet that may occur as a side effect of certain anticancer drugs). Also called carbamide.
  urea nitrogen: (yoo-REE-uh NY-troh-jen)
    Pronunciation of dictionary term "urea nitrogen"
    Nitrogen in the blood that comes from urea (a substance formed by the breakdown of protein in the liver). The kidneys filter urea out of the blood and into the urine. A high level of urea nitrogen in the blood may be a sign of a kidney problem. Also called blood urea nitrogen and BUN.
  urea/lactic acid-based cream: (yoo-REE-uh LAK-tik A-sid …)
    Pronunciation of dictionary term "urea/lactic acid-based cream"
    A substance being studied in the treatment of hand-foot syndrome (a condition caused by chemotherapy and marked by tingling, numbness, and red, peeling skin). Urea/lactic acid-based cream is a moisturizer that may help break down the hardened protein in dry, scaly skin and relieve these symptoms.
  ureter: (YER-eh-ter)
    Pronunciation of dictionary term "ureter"
    The tube that carries urine from the kidney to the bladder.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    Anatomy of the male urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra passing through the penis. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the prostate.
    Anatomy of the female urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the female urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The uterus is also shown.
  ureteronephrectomy: (YER-eh-ter-oh-neh-FREK-toh-mee)
    Pronunciation of dictionary term "ureteronephrectomy"
    Surgery to remove a kidney and its ureter. Also called nephroureterectomy.
  ureteroscopy: (YER-eh-ter-OS-koh-pee)
    Pronunciation of dictionary term "ureteroscopy"
    A procedure that uses a ureteroscope to look inside the ureter (tube that connects the bladder to the kidney) and the renal pelvis (part of the kidney that collects urine and funnels it into the ureter). A ureteroscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue to be checked under a microscope for signs of disease. The ureteroscope is inserted through the urethra into the bladder, ureter, and renal pelvis. Ureteroscopy may be used to check for cancer or other abnormal growths in the ureter and renal pelvis and to treat stones in the kidney or ureter.
    A ureteroscopy is a procedure that uses a ureteroscope (a thin, tube-like instrument with a light and a lens for viewing) to look inside the ureter and renal pelvis to check for abnormal areas. The ureteroscope is inserted through the urethra into the bladder, ureter, and renal pelvis.
    Drawing of a female and male ureteroscopy showing the lower pelvis of a female, including the right and left kidneys, renal pelvis, ureter, uterus, bladder, and urethra, and the lower pelvis of a male, including the ureter, bladder, prostate, urethra, and penis. In both the female and male figures, a ureteroscope (a thin, tube-like instrument with a light and a lens for viewing) is shown passing through the urethra into the bladder and ureter. In the female figure, the ureteroscope is also shown passing into the renal pelvis. There is also an inset that shows a person lying on an examination table with their knees bent and legs apart, covered by a drape, and a doctor looking at an image of the inside of the ureter and/or renal pelvis on a computer monitor.
  urethra: (yoo-REE-thruh)
    Pronunciation of dictionary term "urethra"
    The tube through which urine leaves the body. It empties urine from the bladder.
    More Information
    - Urethral Cancer (https://www.cancer.gov/types/urethral)
    Anatomy of the distal and proximal urethra. Urine flows out of the bladder and leaves the body through the urethra. The part of the urethra that is closest to the bladder is called the proximal urethra. The part that is closest to where the urine leaves the body is called the distal urethra. The urethra is about 8 inches long in men and about 1½ inches long in women.
    Distal and proximal urethra. Drawing on the left shows the female proximal and distal urethra; also shown are the bladder filled with urine, the ureters, and the uterus. Cross-section drawing on the right shows the male proximal and distal urethra. Also shown are the rectum, prostate gland, penis, and testis.
  urethral cancer: (yoo-REE-thrul KAN-ser)
    Pronunciation of dictionary term "urethral cancer"
    A rare cancer that forms in tissues of the urethra (the tube through which urine empties the bladder and leaves the body). Types of urethral cancer include transitional cell carcinoma (cancer that begins in cells that can change shape and stretch without breaking apart), squamous cell carcinoma (cancer that begins in flat cells lining the urethra), and adenocarcinoma (cancer that begins in cells that make and release mucus and other fluids).
    More Information
    - Urethral Cancer (https://www.cancer.gov/types/urethral)
  uric acid: (YOO-rik A-sid)
    Pronunciation of dictionary term "uric acid"
    A waste product left over from normal chemical processes in the body and found in the urine and blood. Abnormal buildup of uric acid in the body may cause a condition called gout. Increased levels of uric acid in the blood and urine can be a side effect of chemotherapy or radiation therapy.
  uridine triacetate: (YOOR-ih-deen try-A-seh-tayt)
    Pronunciation of dictionary term "uridine triacetate"
    A drug used in the emergency treatment of adults and children who receive too much fluorouracil or capecitabine or who have heart or central nervous system toxicity or other serious side effects that occur within 4 days of ending treatment with these drugs. Uridine triacetate may help protect healthy cells from some of the side effects caused by certain anticancer drugs. It is a type of chemoprotective agent and a type of pyrimidine analog. Also called PN401, triacetyluridine, and Vistogard.
    More Information
    - Uridine Triacetate (https://www.cancer.gov/about-cancer/treatment/drugs/uridinetriacetate)
  urinalysis: (YOOR-ih-NA-lih-sis)
    Pronunciation of dictionary term "urinalysis"
    A test that determines the content of the urine.
  urinary: (YOOR-ih-NAYR-ee)
    Pronunciation of dictionary term "urinary"
    Having to do with urine or the organs of the body that produce and get rid of urine.
    More Information
    - Urinary and Bladder Problems (https://www.cancer.gov/about-cancer/treatment/side-effects/urination-changes)
    Anatomy of the male urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra passing through the penis. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the prostate.
    Anatomy of the female urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the female urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The uterus is also shown.
  urinary diversion: (YOOR-ih-NAYR-ee dih-VER-zhun)
    Pronunciation of dictionary term "urinary diversion"
    A surgical procedure to make a new way for urine to leave the body. It may involve redirecting urine into the colon, using catheters to drain the bladder, or making an opening in the abdomen and collecting urine in a bag outside the body.
  urinary incontinence: (YOOR-ih-NAYR-ee in-KON-tih-nents)
    Pronunciation of dictionary term "urinary incontinence"
    Inability to hold urine in the bladder.
    More Information
    - Urinary and Bladder Problems (https://www.cancer.gov/about-cancer/treatment/side-effects/urination-changes)
  urinary retention: (YOOR-ih-NAYR-ee reh-TEN-shun)
    Pronunciation of dictionary term "urinary retention"
    A condition in which urine cannot empty from the bladder. Urinary retention can be acute and develop very quickly, or it can be chronic and occur over a long time. Signs and symptoms include not being able to urinate, feeling a need to urinate right away, urinating often but in small amounts, leaking urine, and lower abdominal pain or swelling. Urinary retention is usually caused by a blockage or narrowing in the bladder or urethra (tube through which urine leaves the body). This may result from an enlarged prostate, a bulging or sagging bladder, kidney or bladder stones, tumor, infection, or inflammation. Urinary retention may also be caused by nerve problems, weak bladder muscles, surgery, and certain medicines.
  urinary system: (YOOR-ih-NAYR-ee SIS-tem)
    Pronunciation of dictionary term "urinary system"
    The organs that make urine and remove it from the body. The urinary system is divided into two parts. The upper urinary system includes the kidneys and ureters. The lower urinary system includes the bladder and urethra. The kidneys remove waste and extra fluid from the blood to make urine. The urine flows from the kidneys through the ureters to the bladder. It is stored in the bladder until it leaves the body through the urethra. Also called urinary tract.
    More Information
    - Urinary and Bladder Problems (https://www.cancer.gov/about-cancer/treatment/side-effects/urination-changes)
    Anatomy of the male urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra passing through the penis. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the prostate.
    Anatomy of the female urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the female urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The uterus is also shown.
  urinary tract: (YOOR-ih-NAYR-ee trakt)
    Pronunciation of dictionary term "urinary tract"
    The organs that make urine and remove it from the body. The urinary tract is divided into two parts. The upper urinary tract includes the kidneys and ureters. The lower urinary tract includes the bladder and urethra. The kidneys remove waste and extra fluid from the blood to make urine. The urine flows from the kidneys through the ureters to the bladder. It is stored in the bladder until it leaves the body through the urethra. Also called urinary system.
    More Information
    - Urinary and Bladder Problems (https://www.cancer.gov/about-cancer/treatment/side-effects/urination-changes)
    Anatomy of the male urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra passing through the penis. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the prostate.
    Anatomy of the female urinary system showing the kidneys, ureters, bladder, and urethra. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the female urinary system; shows the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The uterus is also shown.
  urinary tract infection: (YOOR-ih-NAYR-ee trakt in-FEK-shun)
    Pronunciation of dictionary term "urinary tract infection"
    A condition in which bacteria invade and grow in the urinary tract (the kidneys, ureters, bladder, and urethra). Most urinary tract infections occur in the bladder or urethra. Signs and symptoms may include pain or burning during urination, cloudy or bad-smelling urine, blood in the urine, feeling a need to urinate often or right away, pain in the back or lower abdomen, fever, chills, and fatigue. Certain conditions, such as diabetes, hormone changes, kidney stones, an enlarged prostate, or a spinal cord injury, may increase the risk of a urinary tract infection. Other risk factors include radiation therapy or surgery to the pelvis, taking certain types of medicines (such as anticancer drugs), or using a catheter to empty the bladder. Urinary tract infections are common, especially in women. Also called UTI.
    Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).
  urine: (YOOR-in)
    Pronunciation of dictionary term "urine"
    Fluid containing water and waste products. Urine is made by the kidneys, stored in the bladder, and leaves the body through the urethra.
  urine culture: (YOOR-in KUL-cher)
    Pronunciation of dictionary term "urine culture"
    A laboratory test to check for bacteria, yeast, or other microorganisms in the urine. Urine cultures can help identify the type of microorganism that is causing an infection. This helps determine the best treatment. They may be used to help diagnose urinary tract infections, such as bladder infections. They may also be done after treatment for a urinary tract infection to make sure the microorganism that caused the infection is gone.
  urine cytology: (YOOR-in sy-TAH-loh-jee)
    Pronunciation of dictionary term "urine cytology"
    Tests performed on cells in urine to detect disease.
  urokinase: (YOOR-oh-KY-nays)
    Pronunciation of dictionary term "urokinase"
    An enzyme that is made in the kidney and found in the urine. A form of this enzyme is made in the laboratory and used to dissolve blood clots or to prevent them from forming. Also called u-plasminogen activator, uPA, and urokinase-plasminogen activator.
  urokinase plasminogen activator (uPA)-derived peptide A6: (YOOR-oh-KY-nays plaz-MIH-noh-jen AK-tih-vay-ter … deh-RIVED PEP-tide …)
    Pronunciation of dictionary term "urokinase plasminogen activator (uPA)-derived peptide A6"
    A substance being studied in the treatment of cancer. Urokinase plasminogen activator (uPA)-derived peptide A6 is a small piece of a protein called urokinase (an enzyme that dissolves blood clots or prevents them from forming). It is a type of antiangiogenesis agent and a type of antimetastatic agent. Also called A6.
  urokinase-plasminogen activator: (YOOR-oh-KY-nays-plaz-MIH-noh-jen AK-tih-vay-ter)
    Pronunciation of dictionary term "urokinase-plasminogen activator"
    An enzyme that is made in the kidney and found in the urine. A form of this enzyme is made in the laboratory and used to dissolve blood clots or to prevent them from forming. Also called u-plasminogen activator, uPA, and urokinase.
  urologic oncologist: (YOOR-uh-LAH-jik on-KAH-loh-jist)
    Pronunciation of dictionary term "urologic oncologist"
    A doctor who has special training in diagnosing and treating cancers of the male and female urinary tract and the male reproductive organs.
  urologist: (yoo-RAH-loh-jist)
    Pronunciation of dictionary term "urologist"
    A doctor who has special training in diagnosing and treating diseases of the urinary organs in females and the urinary and reproductive organs in males.
  urostomy: (yoo-ROS-toh-mee)
    Pronunciation of dictionary term "urostomy"
    An operation to create an opening from inside the body to the outside, making a new way to pass urine.
  urothelial cancer: (YOOR-oh-THEE-lee-ul KAN-ser)
    Pronunciation of dictionary term "urothelial cancer"
    Cancer that begins in cells called urothelial cells that line the urethra, bladder, ureters, renal pelvis, and some other organs. Urothelial cells are also called transitional cells. These cells can change shape and stretch without breaking apart. Also called transitional cell cancer.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
  urothelium: (yoo-roh-THEE-lee-um)
    Pronunciation of dictionary term "urothelium"
    The lining of the urinary tract, including the renal pelvis, ureters, bladder, and urethra.
  ursodiol: (ur-soh-DY-ol)
    Pronunciation of dictionary term "ursodiol"
    A drug that is used to dissolve gallstones in people who can’t have surgery to remove them. It is also being studied in the prevention of colorectal cancer. Ursodiol belongs to the family of drugs called anticholelithics.
  urticaria: (ER-tih-KAYR-ee-uh)
    Pronunciation of dictionary term "urticaria"
    Itchy, raised red areas on the skin. Urticaria are caused by a reaction to certain foods, drugs, infections, or emotional stress. Also called hives.
  USB1 gene: (… jeen)
    Pronunciation of dictionary term "USB1 gene"
    A gene that makes an enzyme involved in protecting a certain type of RNA from damage, which helps the RNA perform its role in making proteins. Mutations (changes) in the USB1 gene have been found in Rothmund-Thomson syndrome, which increases the risk of skin cancer. Mutations in this gene have also been found in dyskeratosis congenita (DKC), which causes abnormal changes in the skin and nails and white patches inside the mouth. People with DKC have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
    More Information
    - USB1 gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/usb1/)
  USPSTF: A volunteer group of health experts who review published research and make recommendations about prevention health care methods such as screening tests, counseling, immunizations, and medicines. Before making a recommendation, the USPSTF looks at the strength (scientific quality and correctness) of the evidence found in the research and the benefits and harms of each method being reviewed. Recommendations are made to help health care providers and patients decide whether a specific method is right for a patient’s needs. The recommendations may change as new research studies are published. Also called United States Preventive Services Task Force.
    More Information
    - U.S. Preventive Services Task Force (https://www.uspreventiveservicestaskforce.org/uspstf/)
  usual care: (YOO-zhoo-ul kayr)
    Pronunciation of dictionary term "usual care"
    The care that a provider would normally give to their patients.
  uterine cancer: (YOO-teh-rin KAN-ser)
    Pronunciation of dictionary term "uterine cancer"
    Cancer that forms in tissues of the uterus (the small, hollow, pear-shaped organ in a woman's pelvis in which a fetus develops). Two types of uterine cancer are endometrial cancer (cancer that begins in cells lining the uterus) and uterine sarcoma (a rare cancer that begins in muscle or other tissues in the uterus).
    More Information
    - Uterine Cancer (https://www.cancer.gov/types/uterine)
  uterine sarcoma: (YOO-teh-rin sar-KOH-muh)
    Pronunciation of dictionary term "uterine sarcoma"
    A rare type of uterine cancer that forms in muscle or other tissues of the uterus (the small, hollow, pear-shaped organ in a woman's pelvis in which a fetus develops). It usually occurs after menopause. The two main types are leiomyosarcoma (cancer that begins in smooth muscle cells) and endometrial stromal sarcoma (cancer that begins in connective tissue cells).
    More Information
    - Uterine Cancer (https://www.cancer.gov/types/uterine)
  uterus: (YOO-teh-rus)
    Pronunciation of dictionary term "uterus"
    The hollow, pear-shaped organ in a woman's pelvis. The uterus is where a fetus (unborn baby) develops and grows. Also called womb.
    More Information
    - Uterine Cancer (https://www.cancer.gov/types/uterine)
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  UTI: A condition in which bacteria invade and grow in the urinary tract (the kidneys, ureters, bladder, and urethra). Most UTIs occur in the bladder or urethra. Signs and symptoms may include pain or burning during urination, cloudy or bad-smelling urine, blood in the urine, feeling a need to urinate often or right away, pain in the back or lower abdomen, fever, chills, and fatigue. Certain conditions, such as diabetes, hormone changes, kidney stones, an enlarged prostate, or a spinal cord injury, may increase the risk of a UTI. Other risk factors include radiation therapy or surgery to the pelvis, taking certain types of medicines (such as anticancer drugs), or using a catheter to empty the bladder. UTIs are common, especially in women. Also called urinary tract infection.
    Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).
  UV radiation: (… RAY-dee-AY-shun)
    Pronunciation of dictionary term "UV radiation"
    Invisible rays that are part of the energy that comes from the sun. UV radiation that reaches the Earth's surface is made up of two types of rays, called UVA and UVB. UV radiation also comes from sun lamps and tanning beds. It can cause skin damage, premature aging, melanoma, and other types of skin cancer. It can also cause problems with the eyes and the immune system. Skin specialists recommend that people use sunscreens that protect the skin from both kinds of UV radiation. In medicine, UV radiation also comes from special lamps or a laser and is used to treat certain skin conditions such as psoriasis, vitiligo, and skin tumors of cutaneous T-cell lymphoma. Also called ultraviolet radiation.
    More Information
    - Skin Cancer Prevention
    - Sunlight (https://www.cancer.gov/about-cancer/causes-prevention/risk/sunlight)
  UVA radiation: (… RAY-dee-AY-shun)
    Pronunciation of dictionary term "UVA radiation"
    Invisible rays that are part of the energy that comes from the sun. UVA radiation also comes from sun lamps and tanning beds. UVA radiation may cause premature aging of the skin and skin cancer. It may also cause problems with the eyes and the immune system. Skin specialists recommend that people use sunscreens that protect the skin from ultraviolet radiation. In medicine, UVA radiation also comes from special lamps or a laser and is used to treat certain skin conditions such as psoriasis, vitiligo, and skin tumors of cutaneous T-cell lymphoma. Also called ultraviolet A radiation.
  UVB radiation: (… RAY-dee-AY-shun)
    Pronunciation of dictionary term "UVB radiation"
    Invisible rays that are part of the energy that comes from the sun. UVB radiation causes sunburn, darkening and thickening of the outer layer of the skin, and melanoma and other types of skin cancer. It may also cause problems with the eyes and the immune system. Skin specialists recommend that people use sunscreens that protect the skin from ultraviolet radiation. In medicine, UVB radiation also comes from special lamps or a laser and is used to treat certain skin conditions such as psoriasis, vitiligo, and skin tumors of cutaneous T-cell lymphoma. Also called ultraviolet B radiation.
  UVC radiation: (… RAY-dee-AY-shun)
    Pronunciation of dictionary term "UVC radiation"
    Invisible rays that are part of the energy that comes from the sun. Most UVC radiation from the sun is blocked from the Earth’s surface by the ozone layer. In medicine, UVC radiation may also come from special lamps or a laser and is used to kill germs or to help heal wounds. It is also used to treat certain skin conditions such as psoriasis, vitiligo, and skin nodules of cutaneous T-cell lymphoma Also called ultraviolet C radiation.
  uvea: (YOO-vee-uh)
    Pronunciation of dictionary term "uvea"
    The middle layer of the wall of the eye. The uvea has 3 main parts: (1) the choroid (the tissue layer filled with blood vessels); (2) the ciliary body (the ring of tissue that contains muscles that change the shape of the lens and makes the clear fluid that fills the space between the cornea and the iris; and (3) the iris (the colored part of the eye). Also called uveal tract.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  uveal melanoma: (YOO-vee-ul MEH-luh-NOH-muh)
    Pronunciation of dictionary term "uveal melanoma"
    A rare cancer that begins in the cells that make the dark-colored pigment, called melanin, in the uvea or uveal tract of the eye. The uvea is the middle layer of the wall of the eye and includes the iris, the ciliary body, and the choroid. Uveal melanoma of the iris is usually a small tumor that grows slowly and rarely spreads to other parts of the body. Uveal melanoma of the ciliary body and choroid are usually larger tumors and are more likely to spread to other parts of the body. Uveal melanoma is the most common type of eye cancer in adults. Also called intraocular melanoma.
    More Information
    - Intraocular (Uveal) Melanoma Treatment
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  uveal tract: (YOO-vee-ul trakt)
    Pronunciation of dictionary term "uveal tract"
    The middle layer of the wall of the eye. The uveal tract has 3 main parts: (1) the choroid (the tissue layer filled with blood vessels); (2) the ciliary body (the ring of tissue that contains muscles that change the shape of the lens and makes the clear fluid that fills the space between the cornea and the iris; and (3) the iris (the colored part of the eye). Also called uvea.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  uveitis: (YOO-vee-I-tis)
    Pronunciation of dictionary term "uveitis"
    A rare condition in which all or part of the uvea (middle layer of the wall of the eye) becomes inflamed. The uvea includes the choroid, the ciliary body, and the iris. Uveitis may also affect the lens, retina, optic nerve, and vitreous humor (the gel-like fluid inside the eye). It may be caused by an injury, infection, a tumor in the eye, or an autoimmune or inflammatory condition. One or both eyes may be affected. The signs and symptoms may occur suddenly and get worse quickly. They include redness and pain in the eye, sensitivity to light, blurred vision, dark floating spots in the vision, and vision loss. If not treated, uveitis can lead to tissue scarring and blindness.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  uvula: (YOO-vyoo-luh)
    Pronunciation of dictionary term "uvula"
    The soft flap of tissue that hangs down at the back of the mouth (at the edge of the soft palate). Also called palatine uvula.
    Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.
    Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.
  VAC: An abbreviation for a chemotherapy combination used to treat rhabdomyosarcoma in children. It is also used to treat certain types of ovarian germ cell tumors. VAC includes the drugs vincristine sulfate, dactinomycin (actinomycin-D), and cyclophosphamide. Also called VAC regimen.
    More Information
    - VAC (https://www.cancer.gov/about-cancer/treatment/drugs/VAC)
  VAC regimen: (... REH-jih-men)
    Pronunciation of dictionary term "VAC regimen"
    An abbreviation for a chemotherapy combination used to treat rhabdomyosarcoma in children. It is also used to treat certain types of ovarian germ cell tumors. VAC regimen includes the drugs vincristine sulfate, dactinomycin (actinomycin-D), and cyclophosphamide. Also called VAC.
    More Information
    - VAC (https://www.cancer.gov/about-cancer/treatment/drugs/VAC)
  VAC-IE: (VAK …)
    Pronunciation of dictionary term "VAC-IE"
    An abbreviation for a chemotherapy combination used to treat Ewing sarcoma and other sarcomas, such as mesenchymal chondrosarcoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and cyclophosphamide, followed by ifosfamide and etoposide phosphate. Also called VAC-IE regimen, VAdriaC-IE, and VAdriaC-IE regimen.
  VAC-IE regimen: (VAK … REH-jih-men)
    Pronunciation of dictionary term "VAC-IE regimen"
    An abbreviation for a chemotherapy combination used to treat Ewing sarcoma and other sarcomas, such as mesenchymal chondrosarcoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and cyclophosphamide, followed by ifosfamide and etoposide phosphate. Also called VAC-IE, VAdriaC-IE, and VAdriaC-IE regimen.
  VACB: A procedure in which a small sample of tissue is removed from the breast. An imaging device is used to guide a hollow probe connected to a vacuum device. The probe is inserted through a tiny cut made in numbed skin on the breast. The tissue sample is removed using gentle vacuum suction and a small rotating knife within the probe. Then the tissue sample is studied under a microscope to check for signs of disease. This procedure causes very little scarring and no stitches are needed. Also called vacuum-assisted biopsy and vacuum-assisted core biopsy.
  vaccinated: (VAK-sih-NAY-ted)
    Pronunciation of dictionary term "vaccinated"
    Treated with a vaccine.
  vaccination: (VAK-sih-NAY-shun)
    Pronunciation of dictionary term "vaccination"
    Treatment with a vaccine.
  vaccine: (vak-SEEN)
    Pronunciation of dictionary term "vaccine"
    A substance or group of substances meant to cause the immune system to respond to a tumor or to microorganisms, such as bacteria or viruses. A vaccine can help the body recognize and destroy cancer cells or microorganisms.
    More Information
    - Cancer Treatment Vaccines (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/cancer-treatment-vaccines)
  vaccine adjuvant: (vak-SEEN A-juh-vunt)
    Pronunciation of dictionary term "vaccine adjuvant"
    A substance added to a vaccine to improve the immune response so that less vaccine is needed.
  vaccine therapy: (vak-SEEN THAYR-uh-pee)
    Pronunciation of dictionary term "vaccine therapy"
    A type of treatment that uses a substance or group of substances to stimulate the immune system to destroy a tumor or infectious microorganisms such as bacteria or viruses.
    More Information
    - Cancer Treatment Vaccines (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/cancer-treatment-vaccines)
  vaccinia CEA vaccine: (vak-SIH-nee-uh … vak-SEEN)
    Pronunciation of dictionary term "vaccinia CEA vaccine"
    A vaccine made by putting the gene for carcinoembryonic antigen (CEA) into the vaccinia virus. The vaccinia virus is related to the virus used to make the smallpox vaccine. CEA is a tumor marker. The vaccinia CEA vaccine may help the immune system recognize and kill cancer cells that make CEA.
  vaccinia-TRICOM vaccine: (vak-SIH-nee-uh … vak-SEEN)
    Pronunciation of dictionary term "vaccinia-TRICOM vaccine"
    A cancer vaccine made with a form of a vaccinia virus that does not cause disease in humans. It is being studied in the treatment of some types of cancer. The virus is changed in the laboratory to make human proteins that may help immune cells in the body kill tumor cells. Also called recombinant vaccinia-TRICOM vaccine and rV-TRICOM.
  vacuum aspiration: (VAK-yoom AS-pih-RAY-shun)
    Pronunciation of dictionary term "vacuum aspiration"
    A surgical procedure in which the cervix is dilated (opened) and vacuum is used to remove tissue from the uterus. Also called suction aspiration and suction evacuation.
  vacuum-assisted biopsy: (VA-kyoom-uh-SIS-ted BY-op-see)
    Pronunciation of dictionary term "vacuum-assisted biopsy"
    A procedure in which a small sample of tissue is removed from the breast. An imaging device is used to guide a hollow probe connected to a vacuum device. The probe is inserted through a tiny cut made in numbed skin on the breast. The tissue sample is removed using gentle vacuum suction and a small rotating knife within the probe. Then the tissue sample is studied under a microscope to check for signs of disease. This procedure causes very little scarring and no stitches are needed. Also called VACB and vacuum-assisted core biopsy.
  vacuum-assisted core biopsy: (VA-kyoom-uh-SIS-ted … BY-op-see)
    Pronunciation of dictionary term "vacuum-assisted core biopsy"
    A procedure in which a small sample of tissue is removed from the breast. An imaging device is used to guide a hollow probe connected to a vacuum device. The probe is inserted through a tiny cut made in numbed skin on the breast. The tissue sample is removed using gentle vacuum suction and a small rotating knife within the probe. Then the tissue sample is studied under a microscope to check for signs of disease. This procedure causes very little scarring and no stitches are needed. Also called VACB and vacuum-assisted biopsy.
  VAdriaC: (VAY-dree-ak)
    Pronunciation of dictionary term "VAdriaC"
    An abbreviation for a chemotherapy combination used to treat Ewing sarcoma and other sarcomas, such as mesenchymal chondrosarcoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and cyclophosphamide. Also called VAdriaC regimen.
  VAdriaC regimen: (VAY-dree-ak REH-jih-men)
    Pronunciation of dictionary term "VAdriaC regimen"
    An abbreviation for a chemotherapy combination used to treat Ewing sarcoma and other sarcomas, such as mesenchymal chondrosarcoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and cyclophosphamide. Also called VAdriaC.
  VAdriaC-IE: (VAY-dree-ak …)
    Pronunciation of dictionary term "VAdriaC-IE"
    An abbreviation for a chemotherapy combination used to treat Ewing sarcoma and other sarcomas, such as mesenchymal chondrosarcoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and cyclophosphamide, followed by ifosfamide and etoposide phosphate. Also called VAC-IE, VAC-IE regimen, and VAdriaC-IE regimen.
  VAdriaC-IE regimen: (VAY-dree-ak … REH-jih-men)
    Pronunciation of dictionary term "VAdriaC-IE regimen"
    An abbreviation for a chemotherapy combination used to treat Ewing sarcoma and other sarcomas, such as mesenchymal chondrosarcoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), and cyclophosphamide, followed by ifosfamide and etoposide phosphate. Also called VAC-IE, VAC-IE regimen, and VAdriaC-IE.
  vagina: (vuh-JY-nuh)
    Pronunciation of dictionary term "vagina"
    The muscular canal that goes from the uterus to the outside of the body. During birth, the baby passes through the vagina. Also called birth canal.
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  vaginal: (VA-jih-nul)
    Pronunciation of dictionary term "vaginal"
    Having to do with the vagina (the birth canal).
    More Information
    - Vaginal Cancer (https://www.cancer.gov/types/vaginal)
  vaginal atrophy: (VA-jih-nul A-troh-fee)
    Pronunciation of dictionary term "vaginal atrophy"
    A condition in which the tissues lining the inside of the vagina (birth canal) become thin, dry, and inflamed. This is caused by a decrease in the amount of estrogen (a female hormone) made by the body. Symptoms of vaginal atrophy include vaginal dryness, itching, and burning, and pain during sexual intercourse. Other symptoms include a burning feeling while urinating, feeling a need to urinate often or right away, and being unable to control the flow of urine. Vaginal atrophy most commonly occurs in women who have gone through menopause naturally or who have early menopause caused by certain types of cancer treatment (such as radiation therapy to the pelvis or chemotherapy) or by having their ovaries removed by surgery. Also called atrophic vaginitis.
  vaginal cancer: (VA-jih-nul KAN-ser)
    Pronunciation of dictionary term "vaginal cancer"
    Cancer that forms in the tissues of the vagina (birth canal). The vagina leads from the cervix (the opening of the uterus) to the outside of the body. The most common type of vaginal cancer is squamous cell carcinoma, which starts in the thin, flat cells lining the vagina. Another type of vaginal cancer is adenocarcinoma, cancer that begins in glandular cells in the lining of the vagina.
    More Information
    - Vaginal Cancer (https://www.cancer.gov/types/vaginal)
  vaginal dilation therapy: (VA-jih-nul DY-LAY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "vaginal dilation therapy"
    A method used to prevent the closing of the vagina (the birth canal) after radiation therapy to the pelvis. The patient puts a dilator (tube-like device) coated with an oily or slippery substance into her vagina.
  vaginal intraepithelial neoplasia: (VA-jih-nul IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "vaginal intraepithelial neoplasia"
    Abnormal cells are found in tissue lining the vagina (birth canal). These abnormal cells may become cancer and spread into the vaginal wall. Also called VAIN.
    More Information
    - Vaginal Cancer Treatment
  vaginal stenosis: (VA-jih-nul steh-NOH-sis)
    Pronunciation of dictionary term "vaginal stenosis"
    A condition in which the vagina (birth canal) becomes narrower and shorter. The lining of the vagina may also be thinner and drier and contain scar tissue. This can cause pain during sexual intercourse or a pelvic exam. Vaginal stenosis is often caused by radiation therapy to the pelvis or some types of surgery.
    More Information
    - Sexual Health Issues in Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-women)
  vaginectomy: (va-jih-NEK-toh-mee)
    Pronunciation of dictionary term "vaginectomy"
    Surgery to remove part or all of the vagina (the birth canal).
  VAIN: Abnormal cells are found in tissue lining the vagina (birth canal). These abnormal cells may become cancer and spread into the vaginal wall. Also called vaginal intraepithelial neoplasia.
    More Information
    - Vaginal Cancer Treatment
  valacyclovir: (VAL-uh-SY-kloh-veer)
    Pronunciation of dictionary term "valacyclovir"
    A substance that is being studied in the prevention of fungal, bacterial, and viral infections in patients undergoing donor stem cell transplantation with cells that are infected with cytomegalovirus. It belongs to the family of drugs called antivirals.
  Valchlor: (VAL-klor)
    Pronunciation of dictionary term "Valchlor"
    A drug used on the skin to treat stage I mycosis fungoides (a type of cutaneous T-cell lymphoma) in patients who have already been treated with other therapy. It is also being studied in the treatment of other types of cancer. Valchlor damages the cell's DNA and may kill cancer cells. It is a type of alkylating agent. Also called mechlorethamine hydrochloride and mustine.
    More Information
    - Mechlorethamine Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/mechlorethaminehydrochloride)
  valdecoxib: (VAL-deh-KOK-sib)
    Pronunciation of dictionary term "valdecoxib"
    A substance that is being studied as a treatment for pain and other side effects of cancer therapy. It belongs to the family of drugs called COX-2 inhibitors.
  valerian: (vuh-LEER-ee-un)
    Pronunciation of dictionary term "valerian"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, garden valerian, Indian valerian, Mexican valerian, Pacific valerian, Valeriana officinalis, and Valerianae radix.
  Valeriana officinalis: (vuh-LEER-ee-a-nuh uh-FIH-sih-NUH-lis)
    Pronunciation of dictionary term "Valeriana officinalis"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, garden valerian, Indian valerian, Mexican valerian, Pacific valerian, valerian, and Valerianae radix.
  Valerianae radix: (vuh-LEER-ee-un-i RAY-dix)
    Pronunciation of dictionary term "Valerianae radix"
    A plant whose roots are used as a sedative and to treat certain medical conditions. It is being studied as a way to improve sleep in cancer patients undergoing treatment. Also called garden heliotrope, garden valerian, Indian valerian, Mexican valerian, Pacific valerian, valerian, and Valeriana officinalis.
  valganciclovir: (VAL-gan-SY-kloh-veer)
    Pronunciation of dictionary term "valganciclovir"
    An antiviral agent that is being studied as a treatment for AIDS-related cytomegalovirus. It is changed in the body to ganciclovir.
  Valium: (VAL-ee-um)
    Pronunciation of dictionary term "Valium"
    A drug used to treat mild to moderate anxiety and tension and to relax muscles. It is a type of benzodiazepine. Also called diazepam.
  valproic acid: (val-PROH-ik A-sid)
    Pronunciation of dictionary term "valproic acid"
    A drug used to treat epileptic seizures and bipolar disorder and to prevent migraine headaches. It is also being studied in the treatment of several types of cancer. It blocks an enzyme that cells need to grow and may cause cancer cells to die. It also blocks the growth of new blood vessels that tumors need to grow. It is a type of anticonvulsant, histone deacetylase (HDAC) inhibitor, antimaniacal, migraine headache prophylactic, and antiangiogenesis agent. Also called Depakene and Stavzor.
  valrubicin: (val-ROO-bih-sin)
    Pronunciation of dictionary term "valrubicin"
    A drug used to treat bladder carcinoma in situ that did not get better after treatment with bacillus Calmette-Guerin (BCG). It is used in patients who cannot have surgery right away to remove all or part of the bladder. Valrubicin is given as a solution through a catheter that is placed into the bladder. It blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. Valrubicin is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called AD 32 and Valstar.
    More Information
    - Valrubicin (https://www.cancer.gov/about-cancer/treatment/drugs/valrubicin)
  Valstar: (VAL-star)
    Pronunciation of dictionary term "Valstar"
    A drug used to treat bladder carcinoma in situ that did not get better after treatment with bacillus Calmette-Guerin (BCG). It is used in patients who cannot have surgery right away to remove all or part of the bladder. Valstar is given as a solution through a catheter that is placed into the bladder. It blocks a certain enzyme needed for cell division and DNA repair and may kill cancer cells. Valstar is a type of anthracycline antibiotic and a type of topoisomerase inhibitor. Also called AD 32 and valrubicin.
    More Information
    - Valrubicin (https://www.cancer.gov/about-cancer/treatment/drugs/valrubicin)
  value-based pricing: (VAL-yoo-bayst PRY-sing)
    Pronunciation of dictionary term "value-based pricing"
    A system of setting the cost for a health care service in which health care providers are paid based on the quality of care they provide rather than the number of health care services they give or the number of patients they treat. Value-based pricing may give patients access to better treatments for lower costs. This may help reduce financial stress or hardship on patients receiving medical care.
  VAMP: An abbreviation for a chemotherapy combination used with radiation therapy to treat low-risk childhood Hodgkin lymphoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), methotrexate, and prednisone. Also called VAMP regimen.
    More Information
    - VAMP (https://www.cancer.gov/about-cancer/treatment/drugs/VAMP)
  VAMP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "VAMP regimen"
    An abbreviation for a chemotherapy combination used with radiation therapy to treat low-risk childhood Hodgkin lymphoma. It includes the drugs vincristine sulfate, doxorubicin hydrochloride (Adriamycin), methotrexate, and prednisone. Also called VAMP.
    More Information
    - VAMP (https://www.cancer.gov/about-cancer/treatment/drugs/VAMP)
  vancomycin: (VAN-koh-MY-sin)
    Pronunciation of dictionary term "vancomycin"
    An antibiotic drug used to fight resistant bacterial infections.
  vandetanib: (van-DEH-tuh-nib)
    Pronunciation of dictionary term "vandetanib"
    A drug used to treat medullary thyroid cancer that is locally advanced and cannot be removed by surgery or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Vandetanib blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. Vandetanib is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Caprelsa and ZD6474.
    More Information
    - Vandetanib (https://www.cancer.gov/about-cancer/treatment/drugs/vandetanib)
  Vanflyta: (van-FLIH-tah)
    Pronunciation of dictionary term "Vanflyta"
    A drug used with certain chemotherapy drugs and then alone as maintenance therapy to treat adults with newly diagnosed acute myeloid leukemia that has a certain mutation in the FLT3 gene. It is also being studied in the treatment of other types of cancer. Vanflyta blocks FLT3 and other proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called quizartinib dihydrochloride.
    More Information
    - Quizartinib Dihydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/quizartinib-dihydrochloride)
  Vantas: (VAN-tus)
    Pronunciation of dictionary term "Vantas"
    A drug used as palliative therapy for advanced prostate cancer. Vantas keeps the testicles from making the male hormone testosterone by blocking other hormones that are needed to make it. This may slow or stop the growth of cancer cells that need testosterone to grow. Vantas contains the active ingredient histrelin acetate. It is a type of LHRH (or GnRH) agonist and a type of androgen deprivation therapy that is reversible.
  vaporized: (VAY-per-ized)
    Pronunciation of dictionary term "vaporized"
    In chemistry, describes the change of a solid or liquid substance into a gas or vapor (mist). This usually occurs when the substance is heated above normal room temperature without burning it.
  vapreotide: (vah-PREE-oh-tide)
    Pronunciation of dictionary term "vapreotide"
    A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called somatostatin analogs.
  varenicline tartrate: (vuh-REH-nih-klin TAR-trayt)
    Pronunciation of dictionary term "varenicline tartrate"
    A drug used to help people stop smoking by acting the same way nicotine acts in the brain. It is a type of nicotine receptor partial agonist. Also called Chantix.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
  variable expressivity: (VAYR-ee-uh-bul ek-spreh-SIH-vih-tee)
    Pronunciation of dictionary term "variable expressivity"
    Refers to the difference in the way that signs and symptoms of a genetic condition can show up in individual patients who have that condition. For example, some patients with neurofibromatosis type 1 may have only mild symptoms, such as brown spots and freckling on the skin, and others may have more severe symptoms, such as brain tumors and tumors on the nerves.
  variant: (VAYR-ee-unt)
    Pronunciation of dictionary term "variant"
    Any change in the DNA sequence of a cell. Variants may be caused by mistakes during cell division, or they may be caused by exposure to DNA-damaging agents in the environment. Variants can be harmful, beneficial, or have no effect. If they occur in cells that make eggs or sperm, they can be inherited; if variants occur in other types of cells, they are not inherited. Certain variants may lead to cancer or other diseases. A variant is sometimes called a mutation.
  variant of uncertain significance: (VAYR-ee-unt … un-SER-tin sig-NIH-fih-kunts)
    Pronunciation of dictionary term "variant of uncertain significance"
    A change in a gene’s DNA sequence that has an unknown effect on a person’s health. There is usually not enough information about a variant of uncertain significance to know whether it increases a person’s risk of developing a disease, such as cancer. Also called unclassified variant, variant of unknown significance, and VUS.
  variant of unknown significance: (VAYR-ee-unt … UN-none sig-NIH-fih-kunts)
    Pronunciation of dictionary term "variant of unknown significance"
    A change in a gene’s DNA sequence that has an unknown effect on a person’s health. There is usually not enough information about a variant of unknown significance to know whether it increases a person’s risk of developing a disease, such as cancer. Also called unclassified variant, variant of uncertain significance, and VUS.
  varicella: (VAYR-ih-SEL-uh)
    Pronunciation of dictionary term "varicella"
    A highly contagious disease marked by an itchy, blister-like rash caused by the varicella-zoster virus (a type of herpesvirus). The virus is easily spread from person to person through contact with mucus, saliva, or fluid from the blisters of an infected person or through droplets released when an infected person coughs or sneezes. The rash usually appears first on the face, chest, and back and then spreads to the rest of the body. Other symptoms may include fever, headache, fatigue, and loss of appetite. Varicella can sometimes cause serious health problems, especially in infants, teenagers, adults, pregnant women, and those who have a weakened immune system. Widespread use of the chickenpox vaccine since the early 1990s has prevented most cases of varicella in the United States. Also called chickenpox.
  varicose vein: (VAYR-ih-kose vayn)
    Pronunciation of dictionary term "varicose vein"
    A condition in which a vein, most often in the legs, becomes permanently enlarged, twisted, and painful. This may be caused by valves in the vein that don’t work properly or by weakness in the vein walls.
  Varubi: (vuh-ROO-bee)
    Pronunciation of dictionary term "Varubi"
    A drug used with other drugs in adults to prevent nausea and vomiting caused by chemotherapy. Varubi blocks the action of a certain chemical in the central nervous system that may trigger nausea and vomiting. Blocking this chemical may lessen nausea and vomiting. Varubi is a type of antiemetic and a type of substance P/neurokinin 1 receptor antagonist. Also called rolapitant hydrochloride.
    More Information
    - Rolapitant Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/rolapitanthydrochloride)
  VAS: A tool used to help a person rate the intensity of certain sensations and feelings, such as pain. The visual analog scale for pain is a straight line with one end meaning no pain and the other end meaning the worst pain imaginable. A patient marks a point on the line that matches the amount of pain he or she feels. It may be used to help choose the right dose of pain medicine. Also called visual analog scale.
  vas deferens: (VAS DEH-feh-RENZ)
    Pronunciation of dictionary term "vas deferens"
    A coiled tube that carries the sperm out of the testes.
    Anatomy of the male reproductive system. The male reproductive system is made up of organs and glands involved in making offspring (children). These include the vas deferens (a long tube that carries sperm out of the testes), epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored), prostate gland, penis, and testes.
    Anatomy of the male reproductive system; drawing shows the vas deferens (a long tube that carries sperm out of the testes), prostate gland, penis, and testes. An inset shows the vas deferens and epididymis (a coiled tube that is attached to each of the testes and is where the sperm mature and are stored).
  vascular endothelial growth factor: (VAS-kyoo-ler EN-doh-THEE-lee-ul grothe FAK-ter)
    Pronunciation of dictionary term "vascular endothelial growth factor"
    A substance made by cells that stimulates new blood vessel formation. Also called VEGF.
  vascular endothelial growth factor receptor tyrosine kinase inhibitor: (VAS-kyoo-ler EN-doh-THEE-lee-ul grothe FAK-ter reh-SEP-ter TY-ruh-seen KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "vascular endothelial growth factor receptor tyrosine kinase inhibitor"
    A substance that blocks an enzyme needed to form blood vessels. Also called VEGFR tyrosine kinase inhibitor.
  vascular endothelial growth factor trap: (VAS-kyoo-ler EN-doh-THEE-lee-ul grothe FAK-ter ...)
    Pronunciation of dictionary term "vascular endothelial growth factor trap"
    A drug used with other drugs to treat colorectal cancer that has spread to other parts of the body and has not gotten better with other chemotherapy. It is also being studied in the treatment of other types of cancer. Vascular endothelial growth factor trap blocks a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent. Also called VEGF Trap, Zaltrap, and ziv-aflibercept.
    More Information
    - Ziv-Aflibercept (https://www.cancer.gov/about-cancer/treatment/drugs/ziv-aflibercept)
  vascular endothelial growth factor-antisense oligonucleotide: (VAS-kyoo-ler EN-doh-THEE-lee-ul grothe FAK-ter-AN-tee-sents AH-lih-goh-NOO-klee-oh-tide)
    Pronunciation of dictionary term "vascular endothelial growth factor-antisense oligonucleotide"
    A substance that has been studied in the treatment of cancer. It binds to the RNA for a protein called vascular endothelial growth factor (VEGF) that stimulates the growth of new blood vessels. Vascular endothelial growth factor-antisense oligonucleotide blocks the cell’s ability to make VEGF, which may kill tumors that need new blood vessels to grow. It is a type of antisense oligonucleotide and a type of gene expression inhibitor. Also called VEGF-AS.
  vascular system: (VAS-kyoo-ler SIS-tem)
    Pronunciation of dictionary term "vascular system"
    A large network of blood vessels and lymph vessels that moves blood and lymph throughout the body. The blood vessels carry blood between the heart and the tissues and organs in the body. They also carry oxygen and other gases, nutrients, and hormones to the tissues and help them get rid of waste products. The lymph vessels carry lymph from tissues in different parts of the body to the bloodstream through a large vein near the heart. The vascular system helps control the amount of fluid in the body and helps protect it from infection and disease.
  vascular tumor: (VAS-kyoo-ler TOO-mer)
    Pronunciation of dictionary term "vascular tumor"
    A type of tumor that forms from cells that make blood vessels or lymph vessels. Vascular tumors may be benign (not cancer) or malignant (cancer) and can occur anywhere in the body. They may form on the skin, in the tissues below the skin, and/or in an organ. There are many types of vascular tumors. The most common type of vascular tumor is hemangioma, which is a benign tumor that usually occurs in infants and goes away on its own.
  vascularized autologous bone graft: (VAS-kyoo-luh-RIZED aw-TAH-luh-gus ...)
    Pronunciation of dictionary term "vascularized autologous bone graft"
    Bone tissue that contains blood vessels, taken from one part of the body and used to replace diseased or injured bone in another part of the body of the same person.
  vascularized lymph node transfer: (VAS-kyoo-luh-RIZED limf node TRANZ-fer)
    Pronunciation of dictionary term "vascularized lymph node transfer"
    Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph nodes or vessels become damaged or blocked. During a vascularized lymph node transfer, healthy tissue containing lymph nodes and vessels is taken from one part of the body, such as the neck, abdomen, or groin, and moved to the area with the damaged lymph nodes, usually in a person’s arm or leg. This may cause the lymph nodes and vessels in the healthy tissue to grow and help improve the flow of lymph in that area. Also called lymphovenous transplant and VLNT.
  vasectomy: (va-SEK-toh-mee)
    Pronunciation of dictionary term "vasectomy"
    An operation to cut or tie off the two tubes that carry sperm out of the testicles.
  vasoactive: (VAY-zoh-AK-tiv)
    Pronunciation of dictionary term "vasoactive"
    Describes something that causes the blood vessels to constrict (get narrower) or dilate (get wider).
  vasoactive intestinal peptide: (VAY-zoh-AK-tiv in-TES-tih-nul PEP-tide)
    Pronunciation of dictionary term "vasoactive intestinal peptide"
    A hormone found in the pancreas, intestine, and central nervous system. It has many actions in the body, such as helping to control the secretion of water, salts, enzymes, and gastric acid during digestion. It also causes smooth muscles in the digestive tract, the heart, and the blood vessels to relax. It also has effects on the immune system and the central nervous system. Certain tumors in the pancreas make large amounts of vasoactive intestinal peptide. Also called VIP hormone.
  vasomotor: (VAY-zoh-MOH-ter)
    Pronunciation of dictionary term "vasomotor"
    Affecting the narrowing and widening of the blood vessels.
  vasopressin: (VAY-zoh-PREH-sin)
    Pronunciation of dictionary term "vasopressin"
    A hormone that helps blood vessels constrict and helps the kidneys control the amount of water and salt in the body. This helps control blood pressure and the amount of urine that is made. Vasopressin is made by a part of the brain called the hypothalamus and is secreted into the blood by the pituitary gland. Certain types of tumors may release high amounts of vasopressin, which can cause low levels of sodium in the blood and the body to retain water. Also called antidiuretic hormone and arginine vasopressin.
  vatalanib: (va-TAH-la-nib)
    Pronunciation of dictionary term "vatalanib"
    A substance that is being studied in the treatment of cancer. It belongs to the families of drugs called protein tyrosine kinase inhibitors and VEGF receptor kinase inhibitors. Also called PTK787/ZK 222584.
  VB4-845: A substance being studied in the treatment of certain types of head and neck cancer. VB4-845 is made by linking a monoclonal antibody fragment to a toxic protein that may kill cancer cells. It binds to EpCAM (a protein on the surface of epithelial cells and some types of cancer cells). Also called anti-EpCAM-Pseudomonas-exotoxin fusion protein and Proxinium.
  Vectibix: (VEK-tih-bix)
    Pronunciation of dictionary term "Vectibix"
    A drug used alone or with other drugs to treat certain types of colorectal cancer that have spread to other parts of the body. It is used in patients whose cancer has not already been treated or has gotten worse after treatment with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Vectibix binds to a protein called epidermal growth factor receptor (EGFR), which is found on some normal cells and some types of cancer cells. Blocking this protein may help keep cancer cells from growing. Vectibix is a type of monoclonal antibody. Also called ABX-EGF and panitumumab.
    More Information
    - Panitumumab (https://www.cancer.gov/about-cancer/treatment/drugs/panitumumab)
  vegan: (VEE-gun)
    Pronunciation of dictionary term "vegan"
    A person who does not eat any foods that come from animals, including meat, eggs, and dairy products. A vegan diet is being studied in the prevention and treatment of prostate cancer and other medical conditions.
  VEGF: A substance made by cells that stimulates new blood vessel formation. Also called vascular endothelial growth factor.
  VEGF Trap: (... trap)
    Pronunciation of dictionary term "VEGF Trap"
    A drug used with other drugs to treat colorectal cancer that has spread to other parts of the body and has not gotten better with other chemotherapy. It is also being studied in the treatment of other types of cancer. VEGF Trap blocks a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent. Also called vascular endothelial growth factor trap, Zaltrap, and ziv-aflibercept.
    More Information
    - Ziv-Aflibercept (https://www.cancer.gov/about-cancer/treatment/drugs/ziv-aflibercept)
  VEGF-AS: A substance that has been studied in the treatment of cancer. It binds to the RNA for a protein called vascular endothelial growth factor (VEGF) that stimulates the growth of new blood vessels. VEGF-AS blocks the cell’s ability to make VEGF, which may kill tumors that need new blood vessels to grow. It is a type of antisense oligonucleotide and a type of gene expression inhibitor. Also called vascular endothelial growth factor-antisense oligonucleotide.
  VEGFR tyrosine kinase inhibitor: (VEGFR TY-ruh-seen KY-nays in-HIH-bih-ter)
    Pronunciation of dictionary term "VEGFR tyrosine kinase inhibitor"
    A substance that blocks an enzyme needed to form blood vessels. Also called vascular endothelial growth factor receptor tyrosine kinase inhibitor.
  VEGFR-2 inhibitor CT-322: (... in-HIH-bih-ter ...)
    Pronunciation of dictionary term "VEGFR-2 inhibitor CT-322"
    A substance being studied in the treatment of cancer. VEGFR-2 inhibitor CT-322 may prevent the growth of new blood vessels that tumors need to grow and may kill cancer cells. It is a type of vascular endothelial growth factor receptor-2 (VEGFR-2) inhibitor and a type of antiangiogenesis agent. Also called Angiocept and CT-322.
  vein: (vayn)
    Pronunciation of dictionary term "vein"
    A blood vessel that carries blood to the heart from tissues and organs in the body.
  VeIP: An abbreviation for a chemotherapy combination used to treat advanced ovarian and testicular germ cell cancers. It includes the drugs vinblastine sulfate (Velban), ifosfamide (Ifex), and cisplatin (Platinol). Also called VeIP regimen.
    More Information
    - VeIP (https://www.cancer.gov/about-cancer/treatment/drugs/VeIP)
  VeIP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "VeIP regimen"
    An abbreviation for a chemotherapy combination used to treat advanced ovarian and testicular germ cell cancers. It includes the drugs vinblastine sulfate (Velban), ifosfamide (Ifex), and cisplatin (Platinol). Also called VeIP.
    More Information
    - VeIP (https://www.cancer.gov/about-cancer/treatment/drugs/VeIP)
  velafermin: (veh-luh-FER-min)
    Pronunciation of dictionary term "velafermin"
    A substance that is being studied in the prevention and treatment of oral mucositis (sores in the mouth) in patients receiving high-dose chemotherapy. Velafermin belongs to the family of drugs called recombinant human fibroblast growth factors (rhFGF).
  Velban: (VEL-bun)
    Pronunciation of dictionary term "Velban"
    A drug that contains the active ingredient vinblastine sulfate, which is used to treat many types of cancer. Velban brand has been taken off the market and is no longer available.
  Velcade: (VEL-kayd)
    Pronunciation of dictionary term "velcade"
    A drug used to treat adults with multiple myeloma or mantle cell lymphoma. It is also being studied in the treatment of other types of cancer. Velcade blocks the action of enzymes called proteasomes, which may help keep cancer cells from growing and may kill them. It is a type of proteasome inhibitor. Also called bortezomib and PS-341.
    More Information
    - Bortezomib (https://www.cancer.gov/about-cancer/treatment/drugs/bortezomib)
  veliparib: (veh-lih-PAR-ib)
    Pronunciation of dictionary term "veliparib"
    A substance being studied in the treatment of breast cancers caused by mutations (changes) in the BRCA1 and BRCA2 genes. It is also being studied in the treatment of other types of cancer. It blocks an enzyme involved in many functions of the cell, including the repair of DNA damage. DNA damage may be caused by normal cell actions, UV light, some anticancer drugs, and radiation used to treat cancer. Veliparib may cause cancer cells to die. It is a type of poly(ADP-ribose) polymerase inhibitor. Also called ABT-888 and PARP-1 inhibitor ABT-888.
  Velsar: (VEL-sar)
    Pronunciation of dictionary term "Velsar"
    A drug used to treat several types of cancer, including breast cancer and a type of gestational trophoblastic tumor that have not gotten better with other treatment, lymphoma, testicular cancer, Kaposi sarcoma, and mycosis fungoides. It is also being studied in the treatment of other types of cancer. Velsar blocks cell growth by stopping cell division and may kill cancer cells. It is a type of vinca alkaloid and a type of antimitotic agent. Also called Velban and vinblastine sulfate.
  veltuzumab: (vel-TOO-zoo-mab)
    Pronunciation of dictionary term "veltuzumab"
    A substance being studied in the treatment of several types of lymphoma. It binds to the protein CD20, which is found on B cells (a type of immune system cell) and some types of lymphoma cells. This causes the immune system to kill the cancer cells. Veltuzumab is a type of monoclonal antibody. Also called hA20, HCD20, and IMMU-106.
  vemurafenib: (VEH-myoo-RA-feh-nib)
    Pronunciation of dictionary term "vemurafenib"
    A drug used to treat Erdheim-Chester disease (a very rare type of histiocytosis) and advanced melanoma that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Vemurafenib blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called BRAF (V600E) kinase inhibitor RO5185426, PLX4032, RG7204, and Zelboraf.
    More Information
    - Vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib)
  vena cava: (VEE-nuh KAY-vuh)
    Pronunciation of dictionary term "vena cava"
    A large vein that carries blood to the heart from other areas of the body. The vena cava has two parts: the superior vena cava and the inferior vena cava. The superior vena cava carries blood from the head, neck, arms, and chest. The inferior vena cava carries blood from the legs, feet, and organs in the abdomen and pelvis. The vena cava is the largest vein in the body.
  Venclexta: (ven-KLEK-stuh)
    Pronunciation of dictionary term "Venclexta"
    A drug used alone or with other drugs to treat certain adults with acute myeloid leukemia that is newly diagnosed and adults with chronic lymphocytic leukemia or small lymphocytic lymphoma. It is also being studied in the treatment of other types of cancer. Venclexta binds to a protein called BCL2, which is found on some types of cancer cells. Blocking this protein may help kill cancer cells and may make them more sensitive to anticancer drugs. Venclexta is a type of BCL2 inhibitor. Also called venetoclax.
    More Information
    - Venetoclax (https://www.cancer.gov/about-cancer/treatment/drugs/venetoclax)
  venetoclax: (veh-NEH-toh-klax)
    Pronunciation of dictionary term "venetoclax"
    A drug used alone or with other drugs to treat certain adults with acute myeloid leukemia that is newly diagnosed and adults with chronic lymphocytic leukemia or small lymphocytic lymphoma. It is also being studied in the treatment of other types of cancer. Venetoclax binds to a protein called BCL2, which is found on some types of cancer cells. Blocking this protein may help kill cancer cells and may make them more sensitive to anticancer drugs. Venetoclax is a type of BCL2 inhibitor. Also called Venclexta.
    More Information
    - Venetoclax (https://www.cancer.gov/about-cancer/treatment/drugs/venetoclax)
  venipuncture: (VEE-nih-PUNK-cher)
    Pronunciation of dictionary term "venipuncture"
    A procedure in which a needle is used to take blood from a vein, usually for laboratory testing. Venipuncture may also be done to remove extra red blood cells from the blood, to treat certain blood disorders. Also called blood draw and phlebotomy.
  venlafaxine: (ven-luh-FAK-seen)
    Pronunciation of dictionary term "venlafaxine"
    A drug used to treat depression and certain anxiety disorders. It may also be used to treat hot flashes in women who are in menopause or are being treated for breast cancer. Venlafaxine increases the levels of the chemicals serotonin and norepinephrine in the brain, which helps improve mood. It is a type of antidepressant and a type of serotonin-norepinephrine reuptake inhibitor. Also called Effexor.
  venography: (veh-NAH-gruh-fee)
    Pronunciation of dictionary term "venography"
    A procedure in which an x-ray of the veins is taken after a special dye is injected into the bone marrow or veins.
  venous catheter: (VEE-nus KA-theh-ter)
    Pronunciation of dictionary term "venous catheter"
    A thin, flexible tube that is inserted into a large vein, usually in the arm, chest, or leg. It is used to give intravenous fluids, blood transfusions, and chemotherapy and other drugs, and for taking blood samples. It avoids the need for repeated needle sticks.
  venous sampling: (VEE-nus...)
    Pronunciation of dictionary term "venous sampling"
    A procedure in which a sample of blood is taken from a certain vein and checked for specific substances released by nearby organs and tissues. A higher than normal amount of a substance can be a sign of disease in the organ or tissue that makes it.
  ventilator: (VEN-tih-LAY-ter)
    Pronunciation of dictionary term "ventilator"
    In medicine, a machine used to help a patient breathe. Also called respirator.
  ventricle: (VEN-trih-kul)
    Pronunciation of dictionary term "ventricle"
    A fluid-filled cavity in the heart or brain.
    Anatomy of the brain, showing the cerebrum, cerebellum, brain stem, and other parts of the brain.
    Drawing of brain anatomy showing the brain stem, pons, medulla, spinal cord, cerebellum, cerebrum, meninges, ventricles (fluid-filled spaces), and skull.
    Anatomy of the inside of the brain, showing the pineal and pituitary glands, optic nerve, ventricles (with cerebrospinal fluid shown in blue), and other parts of the brain.
    Drawing of the inside of the brain showing ventricles (fluid-filled spaces), choroid plexus, hypothalamus, pineal gland, pituitary gland, optic nerve, brain stem, cerebellum, cerebrum, medulla, pons, and spinal cord.
  Vepesid: (VEH-peh-sid)
    Pronunciation of dictionary term "Vepesid"
    A drug used to treat testicular and small cell lung cancers. It is also being studied in the treatment of several other types of cancer. Vepesid blocks certain enzymes needed for cell division and DNA repair, and it may kill cancer cells. It is a type of podophyllotoxin derivative and a type of topoisomerase inhibitor. Also called etoposide and Toposar.
  Versed: (ver-SED)
    Pronunciation of dictionary term "Versed"
    A drug used to treat anxiety and tension and to relax muscles. Versed is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of benzodiazepine. Also called midazolam hydrochloride.
  vertebral column: (ver-TEE-brul KAH-lum)
    Pronunciation of dictionary term "vertebral column"
    The bones, muscles, tendons, and other tissues that reach from the base of the skull to the tailbone. The vertebral column encloses the spinal cord and the fluid surrounding the spinal cord. Also called backbone, spinal column, and spine.
    Anatomy of the spine. The spine is made up of bones, muscles, tendons, nerves, and other tissues that reach from the base of the skull near the spinal cord (clivus) to the coccyx (tailbone). The vertebrae (back bones) of the spine include the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the tailbone. Each vertebra is separated by a disc. The vertebrae surround and protect the spinal cord. The spinal cord is divided into segments, each containing a pair of spinal nerves that send messages between the brain and the rest of the body. Many spinal nerves extend beyond the conus medullaris (the end of the spinal cord) to form a bundle of nerves called the cauda equina.
    Anatomy of the spine; drawing shows a side view of the spine, including the cervical spine (C1-C7), thoracic spine (T1-T12), lumbar spine (L1-L5), sacral spine (S1-S5), and the coccyx (tailbone). Also shown are the spinal cord, vertebra (back bone), conus medullaris (the end of the spinal cord), cauda equina (the bundle of spinal nerves that extend beyond the conus medullaris), and a lumbar disc. The clivus (a bone at the base of the skull near the spinal cord) is also shown.
  vertebroplasty: (VER-teh-broh-PLAS-tee)
    Pronunciation of dictionary term "vertebroplasty"
    A procedure used to repair a bone in the spine that has a break caused by cancer, osteoporosis (a decrease in bone mass and density), or trauma. Bone cement is injected into the broken bone to make it stronger.
  verum acupuncture: (VEER-um AK-yoo-PUNK-cher)
    Pronunciation of dictionary term "verum acupuncture"
    Refers to traditional acupuncture, which is the technique of inserting thin needles through the skin to certain depths and at certain points on the body to control pain and other symptoms. The term verum acupuncture may be used when comparing traditional acupuncture to sham (placebo) acupuncture. In sham acupuncture, needles do not go as deep and are not used at the same points on the body.
  Verzenio: (ver-ZEH-nee-oh)
    Pronunciation of dictionary term "Verzenio"
    A drug used alone or with other drugs to treat adults with certain types of hormone-receptor positive, HER2-negative breast cancer. It is also being studied in the treatment of other types of cancer. Verzenio blocks certain proteins, which may help keep cancer cells from growing. It is a type of cyclin-dependent kinase inhibitor. Also called abemaciclib.
    More Information
    - Abemaciclib (https://www.cancer.gov/about-cancer/treatment/drugs/abemaciclib)
  Vesanoid: (VEH-suh-noyd)
    Pronunciation of dictionary term "Vesanoid"
    An oral preparation of tretinoin that is used to treat acute promyelocytic leukemia, usually together with other drugs. It is being studied in the treatment and prevention of other types of cancer. Tretinoin is a form of vitamin A.
  vesicant extravasation: (VEH-sih-kunt ek-STRA-vuh-SAY-shun)
    Pronunciation of dictionary term "vesicant extravasation"
    The leakage of certain drugs called vesicants out of a vein into the tissue around it. Vesicants cause blistering and other tissue injury that may be severe and can lead to tissue necrosis (tissue death).
  vesicle: (VEH-sih-kul)
    Pronunciation of dictionary term "vesicle"
    A small sac formed by a membrane and filled with liquid. Vesicles inside cells move substances into or out of the cell. Vesicles made in the laboratory can be used to carry drugs to cells in the body.
  vestibular schwannoma: (veh-STIH-byoo-ler shwah-NOH-muh)
    Pronunciation of dictionary term "vestibular schwannoma"
    A benign (not cancer) tumor that forms on the nerves in the inner ear and can affect hearing and balance. Vestibular schwannomas usually grow slowly and affect one side of the body. Common signs and symptoms include hearing loss or ringing in one ear, loss of balance, dizziness, and numbness and paralysis in the face. Sometimes these tumors may grow large and press against the facial nerve or other nearby nerves. Rarely, they may press against certain parts of the brain, which could be life threatening. Vestibular schwannomas that affect the nerves in both ears are often caused by a genetic disorder called neurofibromatosis type 2. Vestibular schwannomas usually occur in people aged 30 to 60 years. Also called acoustic neuroma.
  VHL disease: (... dih-ZEEZ)
    Pronunciation of dictionary term "VHL disease"
    A rare, inherited disorder that causes tumors and cysts to grow in certain parts of the body, including the brain, spinal cord, eyes, inner ear, adrenal glands, pancreas, kidney, and reproductive tract. The tumors are usually benign (not cancer), but some may be malignant (cancer). Patients with VHL disease have an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer. The signs and symptoms of VHL disease usually do not appear until young adulthood. It is caused by a mutation (change) in the VHL gene. Also called VHL syndrome, von Hippel-Lindau disease, and von Hippel-Lindau syndrome.
    More Information
    - Von Hippel-Lindau disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7855/von-hippel-lindau-disease)
    - Von Hippel-Lindau syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/von-hippel-lindau-syndrome/)
    Areas of the body affected by von Hippel-Lindau (VHL) disease. VHL disease is an inherited disorder that causes tumors and cysts to grow in certain areas of the body, including the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females). VHL disease also causes an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer.
    Drawing of a male figure and female figure showing areas of the body affected by von Hippel-Lindau disease. These areas include the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females).
  VHL gene: (… jeen)
    Pronunciation of dictionary term "VHL gene"
    A gene that makes a protein that helps control cell growth, cell division, and other important cell functions. Mutated (changed) forms of the VHL gene may increase the growth of cells, including abnormal cells. This mutated gene has been found in nearly all patients with an inherited condition called VHL syndrome. VHL syndrome can cause kidney cancer and tumors of the brain, spinal cord, eye, ear, adrenal glands, pancreas, or other parts of the body. The VHL gene is a type of tumor suppressor gene. Also called von Hippel-Lindau gene.
    More Information
    - Hereditary Kidney Cancer Syndromes
  VHL syndrome: (… SIN-drome)
    Pronunciation of dictionary term "VHL syndrome"
    A rare, inherited disorder that causes tumors and cysts to grow in certain parts of the body, including the brain, spinal cord, eyes, inner ear, adrenal glands, pancreas, kidney, and reproductive tract. The tumors are usually benign (not cancer), but some may be malignant (cancer). Patients with VHL syndrome have an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer. The signs and symptoms of VHL syndrome usually do not appear until young adulthood. It is caused by a mutation (change) in the VHL gene. Also called VHL disease, von Hippel-Lindau disease, and von Hippel-Lindau syndrome.
    More Information
    - Von Hippel-Lindau disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7855/von-hippel-lindau-disease)
    - Von Hippel-Lindau syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/von-hippel-lindau-syndrome/)
    Areas of the body affected by von Hippel-Lindau (VHL) disease. VHL disease is an inherited disorder that causes tumors and cysts to grow in certain areas of the body, including the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females). VHL disease also causes an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer.
    Drawing of a male figure and female figure showing areas of the body affected by von Hippel-Lindau disease. These areas include the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females).
  Viadur: (VY-uh-door)
    Pronunciation of dictionary term "Viadur"
    A drug used to treat advanced prostate cancer. Under the brand name Lupron, it is also used to treat early puberty in children and certain gynecologic conditions. Viadur is also being studied in the treatment of other types of cancer. It blocks the testicles from making testosterone (a male hormone) and the ovaries from making estrogen and progesterone (female hormones). It may stop the growth of prostate cancer cells that need testosterone to grow. Viadur is a type of gonadotropin-releasing hormone (GnRH) agonist. Also called Eligard, leuprolide acetate, and Lupron.
  Viagra: (vy-A-gruh)
    Pronunciation of dictionary term "Viagra"
    A drug used to treat erectile dysfunction. Viagra relaxes the smooth muscle of the penis to allow increased blood flow and erection. It is a type of phosphodiesterase inhibitor. Also called sildenafil.
  vibro-acoustography imaging: (VY-broh-uh-koos-TAH-gruh-fee IH-muh-jing)
    Pronunciation of dictionary term "vibro-acoustography imaging"
    A technique being studied in the diagnosis of breast cancer and other types of cancer. Vibro-acoustography imaging uses ultrasound (high-energy sound waves) to cause tissues to vibrate. The sound made by the vibrating tissues is picked up by a microphone and is used to make an image of the object on a computer. Cancer tissue can be seen because it is denser and vibrates at a different rate than normal tissue.
  Vidaza: (vih-DAY-zuh)
    Pronunciation of dictionary term "Vidaza"
    A drug that contains the active ingredient azacitidine and is used to treat adults with certain types of myelodysplastic syndromes and children aged 1 month and older with newly diagnosed juvenile myelomonocytic leukemia. It is also being studied in the treatment of other types of cancer. Vidaza stops cells from making DNA and may kill cancer cells. It is a type of antimetabolite.
    More Information
    - Azacitidine (https://www.cancer.gov/about-cancer/treatment/drugs/azacitidine)
  video-assisted resection: (VIH-dee-oh-uh-SIS-ted ree-SEK-shun)
    Pronunciation of dictionary term "video-assisted resection"
    Surgery that is aided by the use of a video camera that projects and enlarges the image on a television screen. Also called video-assisted surgery.
  video-assisted surgery: (VIH-dee-oh-uh-SIS-ted SER-juh-ree)
    Pronunciation of dictionary term "video-assisted surgery"
    Surgery that is aided by the use of a video camera that projects and enlarges the image on a television screen. Also called video-assisted resection.
  villous adenoma: (VIH-lus A-deh-NOH-muh)
    Pronunciation of dictionary term "villous adenoma"
    A type of polyp that grows in the colon and other places in the gastrointestinal tract and sometimes in other parts of the body. These adenomas may become malignant (cancer).
  villus: (VIH-lus)
    Pronunciation of dictionary term "villus"
    A tiny hair-like projection, often on the surface of mucous membranes. The plural is villi.
  vimseltinib dihydrate: (vim-SEL-tih-nib dy-HY-drayt)
    Pronunciation of dictionary term "vimseltinib dihydrate"
    A drug used to treat adults with tenosynovial giant cell tumor, a rare, usually benign (not cancer) tumor that affects the joints. It is used when surgery may make the symptoms worse or cause severe problems. It is also being studied in the treatment of other conditions related to cancer. Vimseltinib dihydrate blocks certain proteins, which may help keep tumor cells from growing and spreading. It is a type of tyrosine kinase inhibitor. Also called Romvimza.
  VIN: Abnormal cells are found on the surface of the vulvar skin. These abnormal cells may become cancer and spread into nearby tissue. Also called vulvar carcinoma in situ and vulvar intraepithelial neoplasia.
    More Information
    - Vulvar Cancer Treatment
  vinblastine sulfate: (vin-BLAS-teen SUL-fayt)
    Pronunciation of dictionary term "vinblastine sulfate"
    A drug used to treat certain types of breast cancer, choriocarcinoma (a type of gestational trophoblastic tumor), Hodgkin lymphoma, non-Hodgkin lymphoma, Kaposi sarcoma, mycosis fungoides (a type of cutaneous T-cell lymphoma), and testicular cancer. It is also being studied in the treatment of other types of cancer. Vinblastine sulfate stops cancer cells from growing and dividing and may kill them. It is a type of vinca alkaloid. The brand name Velban has been taken off the market and is no longer available.
    More Information
    - Vinblastine Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)
  vinca alkaloid: (VIN-kuh AL-kuh-LOYD)
    Pronunciation of dictionary term "vinca alkaloid"
    A type of drug that blocks cell growth by stopping mitosis (cell division). Vinca alkaloids interfere with microtubules (cellular structures that help move chromosomes during mitosis). They are used to treat cancer. A vinca alkaloid is a type of mitotic inhibitor and a type of antimicrotubule agent.
  vincristine: (vin-KRIS-teen)
    Pronunciation of dictionary term "vincristine"
    The active ingredient in a drug used to treat acute leukemia. It is sometimes used with other drugs to treat Hodgkin lymphoma, non-Hodgkin lymphoma, rhabdomyosarcoma, neuroblastoma, and Wilms tumor. It is also being studied in the treatment of other types of cancer. Vincristine blocks cell growth by stopping cell division. It is a type of vinca alkaloid and a type of antimitotic agent.
  vincristine sulfate: (vin-KRIS-teen SUL-fayt)
    Pronunciation of dictionary term "vincristine sulfate"
    A drug used to treat acute leukemia and is sometimes used with other drugs to treat Hodgkin lymphoma, non-Hodgkin lymphoma, rhabdomyosarcoma, neuroblastoma, and Wilms tumor. It is also being studied in the treatment of other types of cancer. Vincristine sulfate stops cancer cells from growing and dividing and may kill them. It is a type of vinca alkaloid. Vincristine is the active ingredient of vincristine sulfate. The brand name Oncovin has been taken off the market and is no longer available.
    More Information
    - Vincristine Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)
  vincristine sulfate liposome: (vin-KRIS-teen SUL-fayt LY-poh-some)
    Pronunciation of dictionary term "vincristine sulfate liposome"
    A form of the anticancer drug vincristine sulfate that is contained inside very tiny, fat-like particles and is used to treat adults with acute lymphoblastic leukemia that is Philadelphia chromosome negative and has come back or has not gotten better with other treatment. Vincristine sulfate liposome may have fewer side effects and work better than other forms of vincristine sulfate. It is also being studied in the treatment of other types of cancer. Vincristine sulfate liposome stops cancer cells from growing and dividing and may kill them. It is a type of vinca alkaloid. Also called liposomal vincristine sulfate and Marqibo.
    More Information
    - Vincristine Sulfate Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/vincristine-sulfate-liposome)
  vindesine: (VIN-deh-seen)
    Pronunciation of dictionary term "vindesine"
    An anticancer drug that belongs to the family of plant drugs called vinca alkaloids.
  vinflunine: (VIN-floo-neen)
    Pronunciation of dictionary term "vinflunine"
    A substance being studied in the treatment of bladder cancer, lung cancer, and other types of cancer. Also called Javlor.
  vinorelbine: (vih-NOR-el-been)
    Pronunciation of dictionary term "vinorelbine"
    The active ingredient in a drug used alone or with cisplatin to treat non-small cell lung cancer that is locally advanced or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Vinorelbine blocks cell growth by stopping cell division and may cause cancer cells to die. It is a type of vinca alkaloid and a type of antimitotic agent.
  vinorelbine tartrate: (vih-NOR-el-been TAR-trayt)
    Pronunciation of dictionary term "vinorelbine tartrate"
    A drug used alone or with cisplatin to treat non-small cell lung cancer that is locally advanced or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Vinorelbine tartrate stops cancer cells from growing and dividing and may kill them. It is a type of vinca alkaloid.
    More Information
    - Vinorelbine Tartrate (https://www.cancer.gov/about-cancer/treatment/drugs/vinorelbinetartrate)
  vinyl chloride: (VY-nil KLOR-ide)
    Pronunciation of dictionary term "vinyl chloride"
    A substance used to make plastics. Exposure to vinyl chloride may increase the risk of developing liver, brain, and lung cancers; lymphoma; and leukemia.
    More Information
    - Vinyl Chloride (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/vinyl-chloride)
  Vioxx: (VY-ox)
    Pronunciation of dictionary term "Vioxx"
    A drug that was being used for pain relief and was being studied for its ability to prevent cancer and to prevent the growth of new blood vessels that tumors need to grow. It is a type of nonsteroidal anti-inflammatory drug and a type of antiangiogenesis agent. Vioxx was taken off the market in the U.S. because of safety concerns. Also called rofecoxib.
  VIP: An abbreviation for a chemotherapy combination used to treat advanced testicular cancer. It is often used in patients who cannot receive bleomycin. It includes the drugs etoposide (VePesid), ifosfamide, and cisplatin (Platinol). Also called VIP regimen.
    More Information
    - VIP (https://www.cancer.gov/about-cancer/treatment/drugs/VIP)
  VIP hormone: (... HOR-mone)
    Pronunciation of dictionary term "VIP hormone"
    A hormone found in the pancreas, intestine, and central nervous system. It has many actions in the body, such as helping to control the secretion of water, salts, enzymes, and gastric acid during digestion. It also causes smooth muscles in the digestive tract, the heart, and the blood vessels to relax. It also has effects on the immune system and the central nervous system. Certain tumors in the pancreas make large amounts of VIP hormone. Also called vasoactive intestinal peptide.
  VIP regimen: (… REH-jih-men)
    Pronunciation of dictionary term "VIP regimen"
    An abbreviation for a chemotherapy combination used to treat advanced testicular cancer. It is often used in patients who cannot receive bleomycin. It includes the drugs etoposide (VePesid), ifosfamide, and cisplatin (Platinol). Also called VIP.
    More Information
    - VIP (https://www.cancer.gov/about-cancer/treatment/drugs/VIP)
  VIP-producing neuroendocrine tumor: (… proh-DOO-sing NOOR-oh-EN-doh-krin TOO-mer)
    Pronunciation of dictionary term "VIP-producing neuroendocrine tumor"
    A very rare tumor that usually forms in the islet cells of the pancreas and makes the hormone vasoactive intestinal peptide (VIP). VIP helps control the secretion of water, salts, enzymes, and gastric acid during digestion and relaxes certain muscles in the digestive tract. Signs and symptoms of VIP-producing neuroendocrine tumor include chronic watery diarrhea, dehydration, abdominal pain, nausea, flushing or redness in the face, weight loss, and very low levels of potassium in the blood. Most VIP-producing neuroendocrine tumors are cancer and have often spread to other parts of the body when they are found. VIP-producing neuroendocrine tumor is a type of pancreatic neuroendocrine tumor. Also called VIP-secreting tumor and VIPoma.
  VIP-secreting tumor: (… seh-KREE-ting TOO-mer)
    Pronunciation of dictionary term "VIP-secreting tumor"
    A very rare tumor that usually forms in the islet cells of the pancreas and makes the hormone vasoactive intestinal peptide (VIP). VIP helps control the secretion of water, salts, enzymes, and gastric acid during digestion and relaxes certain muscles in the digestive tract. Signs and symptoms of VIP-secreting tumor include chronic watery diarrhea, dehydration, abdominal pain, nausea, flushing or redness in the face, weight loss, and very low levels of potassium in the blood. Most VIP-secreting tumors are cancer and have often spread to other parts of the body when they are found. VIP-secreting tumor is a type of pancreatic neuroendocrine tumor. Also called VIP-producing neuroendocrine tumor and VIPoma.
  VIPoma: (…OH-muh)
    Pronunciation of dictionary term "VIPoma"
    A very rare tumor that usually forms in the islet cells of the pancreas and makes the hormone vasoactive intestinal peptide (VIP). VIP helps control the secretion of water, salts, enzymes, and gastric acid during digestion and relaxes certain muscles in the digestive tract. Signs and symptoms of VIPoma include chronic watery diarrhea, dehydration, abdominal pain, nausea, flushing or redness in the face, weight loss, and very low levels of potassium in the blood. Most VIPomas are cancer and have often spread to other parts of the body when they are found. VIPoma is a type of pancreatic neuroendocrine tumor. Also called VIP-producing neuroendocrine tumor and VIP-secreting tumor.
  viral: (VY-rul)
    Pronunciation of dictionary term "viral"
    Having to do with a virus.
  viral oncolysate: (VY-rul on-KAH-lih-sayt)
    Pronunciation of dictionary term "viral oncolysate"
    An extract made from cancer cells that are infected with a strain of virus that can lyse (break down) cancer cells. The extract contains both cancer cell proteins and virus proteins. Viral oncolysates are being studied as cancer vaccines.
  viral therapy: (VY-rul THAYR-uh-pee)
    Pronunciation of dictionary term "viral therapy"
    Treatment using a virus that has been changed in the laboratory to find and destroy cancer cells without harming healthy cells. It is a type of targeted therapy. Also called oncolytic virotherapy, oncolytic virus therapy, and virotherapy.
  viral vector: (VY-rul VEK-ter)
    Pronunciation of dictionary term "viral vector"
    A form of a virus used to deliver genetic material into a cell. Before the virus is used in this way, it is changed in the laboratory so that it cannot cause disease in people. Viral vectors may be used to carry genes that can change cancer cells back to normal cells or to replace a gene that isn’t working correctly with a working copy of the gene. In cancer vaccines, viral vectors can be used to deliver specific cancer-related antigens into the body. The antigens may stimulate the immune system to recognize and kill the cancer cells. Viral vectors may also be used in vaccines to help prevent certain types of viral infections. Examples of viral vectors are adenoviruses, adeno-associated viruses, retroviruses, lentiviruses, and herpes simplex viruses.
  virotherapy: (VY-roh-THAYR-uh-pee)
    Pronunciation of dictionary term "virotherapy"
    Treatment using a virus that has been changed in the laboratory to find and destroy cancer cells without harming healthy cells. It is a type of targeted therapy. Also called oncolytic virotherapy, oncolytic virus therapy, and viral therapy.
  virtual colonoscopy: (VER-chuh-wul KOH-luh-NOS-koh-pee)
    Pronunciation of dictionary term "virtual colonoscopy"
    A method to examine the inside of the colon by taking a series of x-rays. A computer is used to make 2-dimensional (2-D) and 3-D pictures of the colon from these x-rays. The pictures can be saved, changed to give better viewing angles, and reviewed after the procedure, even years later. Also called computed tomographic colonography, computed tomography colonography, and CT colonography.
    More Information
    - Screening Tests to Detect Colorectal Cancer and Polyps (https://www.cancer.gov/types/colorectal/screening-fact-sheet)
  virulence: (VEER-uh-lents)
    Pronunciation of dictionary term "virulence"
    The ability of a microorganism to cause damage to its host.
  virulent: (VEER-uh-lent)
    Pronunciation of dictionary term "virulent"
    Refers to the ability of a virus or a bacterium to cause damage to its host.
  Virulizin: (VEER-yoo-LY-zin)
    Pronunciation of dictionary term "Virulizin"
    A substance that activates some types of immune system cells, and is being studied as a treatment for cancer. It belongs to the family of drugs called biological therapy agents.
  virus: (VY-rus)
    Pronunciation of dictionary term "virus"
    In medicine, a very simple microorganism that infects cells and may cause disease. Because viruses can multiply only inside infected cells, they are not considered to be alive.
  virus replication cycle: (VY-rus reh-plih-KAY-shun...)
    Pronunciation of dictionary term "virus replication cycle"
    The reproduction cycle of viruses. A replication cycle begins with the infection of a host cell and ends with the release of mature progeny virus particles.
  virus-like particle: (VY-rus-like PAR-tih-kul)
    Pronunciation of dictionary term "virus-like particle"
    A small particle that contains certain proteins from the outer coat of a virus. Virus-like particles do not contain any genetic material from the virus and cannot cause an infection. They are used to make vaccines that can help the body’s immune system kill microorganisms and certain cancer cells. Virus-like particles were used to make vaccines that prevent cervical cancer caused by human papilloma viruses (HPV). They were also used to make vaccines that prevent liver cancer caused by infection with the hepatitis B virus.
  virus-neutralizing antibody: (VY-rus-NOO-truh-LY-zing AN-tee-BAH-dee)
    Pronunciation of dictionary term "virus-neutralizing antibody"
    An antibody that binds to a virus and interferes with its ability to infect a cell.
  viscera: (VIH-seh-ruh)
    Pronunciation of dictionary term "viscera"
    The soft internal organs of the body, including the lungs, the heart, and the organs of the digestive, excretory, and reproductive systems.
  visceral: (VIH-seh-rul)
    Pronunciation of dictionary term "visceral"
    Having to do with the viscera, which are the soft internal organs of the body, including the lungs, the heart, and the organs of the digestive, excretory, reproductive, and circulatory systems.
  visceral peritoneum: (VIH-seh-rul PAYR-ih-toh-NEE-um)
    Pronunciation of dictionary term "visceral peritoneum"
    The layers of tissue that cover the outer surface of most organs in the abdomen, including the intestines.
  viscotoxin: (VIS-koh-TOK-sin)
    Pronunciation of dictionary term "viscotoxin"
    A member of a group of small proteins produced by mistletoe plants that are able to kill cells and may stimulate the immune system.
  visilizumab: (vih-sih-LIZ-yoo-mab)
    Pronunciation of dictionary term "visilizumab"
    A substance being studied in the treatment of an immune system reaction called graft-versus-host disease (GVHD), which may occur after a donor stem cell transplant. It is also being studied in the treatment of some autoimmune diseases. Visilizumab binds to a protein called CD3, which is found on some T cells (a type of white blood cell). This may help suppress the body’s immune response. Visilizumab is a type of monoclonal antibody.
  vismodegib: (VIS-moh-DEH-gib)
    Pronunciation of dictionary term "vismodegib"
    A drug used to treat basal cell carcinoma that has spread to other parts of the body, has come back after surgery, or that cannot be treated with surgery or radiation. It is also being studied in the treatment of other types of cancer. Vismodegib blocks a type of protein involved in tissue growth and repair and may block the growth of cancer cells. It is a type of Hedgehog signaling pathway antagonist. Also called Erivedge and GDC-0449.
    More Information
    - Vismodegib (https://www.cancer.gov/about-cancer/treatment/drugs/vismodegib)
  Vistogard: (VIS-toh-gard)
    Pronunciation of dictionary term "Vistogard"
    A drug used in the emergency treatment of adults and children who receive too much fluorouracil or capecitabine or who have heart or central nervous system toxicity or other serious side effects that occur within 4 days of ending treatment with these drugs. Vistogard may help protect healthy cells from some of the side effects caused by certain anticancer drugs. It is a type of chemoprotective agent and a type of pyrimidine analog. Also called PN401, triacetyluridine, and uridine triacetate.
    More Information
    - Uridine Triacetate (https://www.cancer.gov/about-cancer/treatment/drugs/uridinetriacetate)
  visual analog scale: (VIH-zhoo-ul A-nuh-log skayl)
    Pronunciation of dictionary term "visual analog scale"
    A tool used to help a person rate the intensity of certain sensations and feelings, such as pain. The visual analog scale for pain is a straight line with one end meaning no pain and the other end meaning the worst pain imaginable. A patient marks a point on the line that matches the amount of pain he or she feels. It may be used to help choose the right dose of pain medicine. Also called VAS.
  visual pathway glioma: (VIH-zhoo-ul ... glee-OH-muh)
    Pronunciation of dictionary term "visual pathway glioma"
    A rare, slow-growing tumor that usually forms in the optic nerve, optic chiasm, or optic tract. These are parts of the nervous system that carry messages from the eye to the brain. Also called optic pathway glioma.
  vital: (VY-tul)
    Pronunciation of dictionary term "vital"
    Necessary to maintain life. Breathing is a vital function.
  vitality: (vy-TA-lih-tee)
    Pronunciation of dictionary term "vitality"
    A term used to describe a person’s ability to live, grow, and develop. Vitality also refers to having energy and being vigorous and active. Being ill or being treated for a disease, such as cancer, may lessen a person’s vitality.
  vitamin: (VY-tuh-min)
    Pronunciation of dictionary term "vitamin"
    A nutrient that the body needs in small amounts to function and stay healthy. Sources of vitamins are plant and animal food products and dietary supplements. Some vitamins are made in the human body from food products. Vitamins are either fat-soluble (can dissolve in fats and oils) or water-soluble (can dissolve in water). Excess fat-soluble vitamins are stored in the body’s fatty tissue, but excess water-soluble vitamins are removed in the urine. Examples are vitamin A, vitamin C, and vitamin E.
  vitamin A: (VY-tuh-min …)
    Pronunciation of dictionary term "vitamin A"
    A nutrient that the body needs in small amounts to function and stay healthy. Vitamin A helps in vision, bone growth, reproduction, growth of epithelium (cells that line the internal and external surfaces of the body), and fighting infections. It is fat-soluble (can dissolve in fats and oils). Vitamin A is found in liver, egg yolks, and whole milk dairy products from animals and in fish oils. It can also be made in the body from a substance found in some fruits and vegetables, such as cantaloupes, carrots, spinach, and sweet potatoes. Vitamin A is being studied in the prevention and treatment of some types of cancer. Also called retinol.
  vitamin A acid: (VY-tuh-min...A-sid)
    Pronunciation of dictionary term "vitamin A acid"
    A nutrient that the body needs in small amounts to function and stay healthy. Vitamin A acid is made in the body from vitamin A and helps cells to grow and develop, especially in the embryo. A form of vitamin A acid made in the laboratory is put on the skin to treat conditions such as acne and is taken by mouth to treat acute promyelocytic leukemia (a fast-growing cancer in which there are too many immature blood-forming cells in the blood and bone marrow). Vitamin A acid is being studied in the prevention and treatment of other types of cancer. Also called all-trans retinoic acid, ATRA, retinoic acid, and tretinoin.
  vitamin B complex: (VY-tuh-min ... KOM-plex)
    Pronunciation of dictionary term "vitamin B complex"
    A compound containing several or all of a group of vitamins and nutrients that the body needs in very small amounts to function and stay healthy. The B vitamins in the vitamin B complex include thiamine, riboflavin, niacin (nicotinic acid), niacinamide (nicotinamide), the vitamin B6 group (including pyridoxine, pyridoxal, pyridoxamine), biotin, pantothenic acid, folic acid, and vitamin B12. Aminobenzoic acid, inositol, and choline are sometimes included as part of the vitamin B complex. The vitamin B complex is water-soluble (can dissolve in water) and is found in yeast, seeds, eggs, liver, meat, and vegetables. Members of the vitamin B complex are being studied in the prevention and treatment of some types of cancer.
  vitamin B1: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin B1"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin B1 helps some enzymes work properly, helps break down sugars in the diet, and keeps nerves and the heart healthy. It is found in pork, organ meats, peas, beans, nuts, and whole grains. Vitamin B1 is water-soluble (can dissolve in water) and must be taken in daily. Not enough vitamin B1 can cause a disease called beriberi (a condition marked by heart, nerve, and digestive disorders). Too much vitamin B1 may help cancer cells grow faster. Also called thiamine.
  vitamin B12: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin B12"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin B12 helps make red blood cells, DNA, RNA, energy, and tissues, and keeps nerve cells healthy. It is found in liver, meat, eggs, poultry, shellfish, milk, and milk products. Vitamin B12 is water-soluble (can dissolve in water) and must be taken in every day. Not enough vitamin B12 can cause certain types of anemia (a condition in which the number of red blood cells is below normal) and neurologic disorders. It is being studied with folate in the prevention and treatment of some types of cancer. Also called cobalamin and cyanocobalamin.
    More Information
    - Cancer Prevention Overview
  vitamin B2: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin B2"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin B2 helps make red blood cells, helps some enzymes work properly, and keeps skin, nails, and hair healthy. It is found in milk, eggs, malted barley, organ meats, yeast, and leafy vegetables. Vitamin B2 is water-soluble (can dissolve in water) and must be taken in every day. Not enough vitamin B2 can cause anemia (a low number of red blood cells), mouth sores, and skin problems. Amounts of vitamin B2 may be higher in the blood of patients with some types of cancer. Also called riboflavin.
  vitamin B3: (VY-tuh-min …)
    Pronunciation of dictionary term "vitamin B3"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin B3 helps some enzymes work properly and helps skin, nerves, and the digestive tract stay healthy. Vitamin B3 is found in many plant and animal products. It is water-soluble (can dissolve in water) and must be taken in every day. Not enough vitamin B3 can cause a disease called pellagra (a condition marked by skin, nerve, and digestive disorders). A form of vitamin B3 is being studied in the prevention of skin and other types of cancer. Vitamin B3 may help to lower blood cholesterol. Also called niacin and nicotinic acid.
  vitamin B5: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin B5"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin B5 helps some enzymes use foods and make many substances used in the body and protects cells against damage from peroxides. It is found in almost all plant and animal foods. Vitamin B5 is water-soluble (can dissolve in water) and must be taken in every day. Also called pantothenic acid.
  vitamin B6: (VY-tuh-min…)
    Pronunciation of dictionary term "vitamin B6"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin B6 helps keep nerves and skin healthy, fight infections, keep blood sugar levels normal, produce red blood cells, and some enzymes work properly. Vitamin B6 is a group of related compounds (pyridoxine, pyridoxal, and pyridoxamine) found in cereals, beans, peas, nuts, meat, poultry, fish, eggs, and bananas. It is water-soluble (can dissolve in water). Not enough vitamin B6 can cause mouth and tongue sores and nervous disorders. Vitamin B6 is being studied in the prevention of hand-foot syndrome (a disorder caused by certain anticancer drugs and marked by pain, swelling, numbness, tingling, or redness of the hands or feet). Also called pyridoxine.
    More Information
    - Cancer Prevention Overview
  vitamin C: (VY-tuh-min…)
    Pronunciation of dictionary term "vitamin C"
    A nutrient that the body needs in small amounts to function and stay healthy. Vitamin C helps fight infections, heal wounds, and keep tissues healthy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). Vitamin C is found in all fruits and vegetables, especially citrus fruits, strawberries, cantaloupe, green peppers, tomatoes, broccoli, leafy greens, and potatoes. It is water-soluble (can dissolve in water) and must be taken in every day. Vitamin C is being studied in the prevention and treatment of some types of cancer. Also called ascorbic acid.
    More Information
    - Intravenous Vitamin C
    - Cancer Prevention Overview
  vitamin D: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin D"
    A nutrient that the body needs in small amounts to function and stay healthy. Vitamin D helps the body use calcium and phosphorus to make strong bones and teeth. It is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, egg yolks, and dairy products. Skin exposed to sunshine can also make vitamin D. Not enough vitamin D can cause a bone disease called rickets. It is being studied in the prevention and treatment of some types of cancer. Also called cholecalciferol.
    More Information
    - Vitamin D and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/diet/vitamin-d-fact-sheet)
  vitamin D2: (VY-tuh-min …)
    Pronunciation of dictionary term "vitamin D2"
    A form of vitamin D that helps the body use calcium and phosphorus to make strong bones and teeth. It is fat-soluble (can dissolve in fats and oils) and is found in plants and yeast. It can be made in the body from another form of vitamin D when the body is exposed to the sun. Vitamin D2 is also made in the laboratory. It is used to prevent and to treat vitamin D deficiency. It is a type of dietary supplement. Also called ergocalciferol.
  vitamin E: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin E"
    A nutrient that the body needs in small amounts to stay healthy and work the way it should. It is fat-soluble (can dissolve in fats and oils) and is found in seeds, nuts, leafy green vegetables, and vegetable oils. Vitamin E boosts the immune system and helps keep blood clots from forming. It also helps prevent cell damage caused by free radicals (highly reactive chemicals). Vitamin E is being studied in the prevention and treatment of some types of cancer. It is a type of antioxidant. Also called alpha-tocopherol.
    More Information
    - Cancer Prevention Overview
  vitamin H: (VY-tuh-min …)
    Pronunciation of dictionary term "vitamin H"
    A nutrient in the vitamin B complex that the body needs in small amounts to function and stay healthy. Vitamin H helps some enzymes break down substances in the body for energy and helps tissues develop. It is found in yeast, whole milk, egg yolks, and organ meats. Vitamin H is water-soluble (can dissolve in water) and must be taken in every day. Not enough vitamin H can cause skin, nerve, and eye disorders. Vitamin H is present in larger amounts in some cancer tissue than in normal tissue. Attaching vitamin H to substances used to treat some types of cancer helps them find cancer cells. Also called biotin.
  vitamin K: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin K"
    A nutrient that the body needs in small amounts to function and stay healthy. Vitamin K helps to form blood clots (a mass that forms when blood platelets, proteins, and cells stick together) and maintain strong bones. It is fat-soluble (can dissolve in fats and oils) and is found in green leafy vegetables, broccoli, liver, and vegetable oils. Vitamin K is also made by bacteria that live in the large intestine. Not enough vitamin K can lead to bleeding and bruising. It is a type of phylloquinone.
  vitamin Q10: (VY-tuh-min ...)
    Pronunciation of dictionary term "vitamin Q10"
    A nutrient that the body needs in small amounts to function and stay healthy. Vitamin Q10 helps mitochondria (small structures in the cell) make energy. It is an antioxidant that helps prevent cell damage caused by free radicals (highly reactive chemicals). Vitamin Q10 is fat-soluble (can dissolve in fats and oils) and is found in fatty fish, beef, soybeans, peanuts, and spinach. It is being studied in the prevention and treatment of some types of cancer and heart disease and in the relief of side effects caused by some cancer treatments. Also called coenzyme Q10, CoQ10, Q10, and ubiquinone.
    More Information
    - Coenzyme Q10
  vitespen: (vy-TEH-spen)
    Pronunciation of dictionary term "vitespen"
    A vaccine made from a patient’s tumor cells that may help the body’s immune system kill cancer cells. This vaccine is used to treat kidney cancer, a type of brain cancer called glioma, and metastatic melanoma (a type of skin cancer that has spread). It is also being studied in the treatment of other types of cancer. Also called gp96 heat shock protein-peptide complex vaccine, gp96 HSP-peptide complex, and Oncophage.
  Vitex: (VY-tex)
    Pronunciation of dictionary term "Vitex"
    An extract made from the fruit of the chaste tree (Vitex agnus-castus) found in parts of Asia and Europe. It is claimed to treat infertility and to lessen symptoms that may occur before or during a woman’s menstrual period, such as headaches and irregular bleeding. Vitex may affect levels of reproductive hormones in the blood. It is a type of phytomedicine. Also called chaste tree berry and monk’s pepper.
  Vitrakvi: (vih-TRAK-vee)
    Pronunciation of dictionary term "Vitrakvi"
    A drug used to treat adults and children with certain types of solid tumors that have spread or cannot be removed by surgery and have the NTRK gene fusion. It is also being studied in the treatment of other types of cancer. Vitrakvi blocks the TRK protein, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called larotrectinib sulfate, LOXO-101, and Trk inhibitor LOXO-101.
    More Information
    - Larotrectinib Sulfate (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)
  vitreous humor: (VIH-tree-us HYOO-mer)
    Pronunciation of dictionary term "vitreous humor"
    The clear jelly-like substance that fills the inside of the eyeball. As a person ages, the vitreous humor becomes more liquid.
    Anatomy of the eye showing the outside and inside of the eye, including the eyelid, pupil, sclera, iris, cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
    Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.
  Vivitrol: (VIH-vih-trol)
    Pronunciation of dictionary term "Vivitrol"
    A drug that blocks the action of opiates (drugs used to treat pain). It may be used in the treatment of intravenous opiate addiction or alcohol dependence. Vivitrol is also being studied in the treatment of breast cancer. It may block the effects of the hormone estrogen, which causes some breast cancer cells to grow, or block the blood flow to tumors. It is a type of opiate antagonist. Also called naltrexone hydrochloride and ReVia.
  Vizimpro: (vih-ZIM-proh)
    Pronunciation of dictionary term "Vizimpro"
    A drug used to treat non-small cell lung cancer that has spread, has not already been treated, and has certain mutations (changes) in the EGFR gene. It is also being studied in the treatment of other types of cancer. Vizimpro blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of tyrosine kinase inhibitor. Also called dacomitinib and PF-00299804.
    More Information
    - Dacomitinib (https://www.cancer.gov/about-cancer/treatment/drugs/dacomitinib)
  VLNT: Surgery done to help relieve symptoms of lymphedema (swelling caused by a buildup of lymph in the tissues). Lymphedema can occur when lymph nodes or vessels become damaged or blocked. During a VLNT, healthy tissue containing lymph nodes and vessels is taken from one part of the body, such as the neck, abdomen, or groin, and moved to the area with the damaged lymph nodes, usually in a person’s arm or leg. This may cause the lymph nodes and vessels in the healthy tissue to grow and help improve the flow of lymph in that area. Also called lymphovenous transplant and vascularized lymph node transfer.
  VNP20009: A genetically modified Salmonella bacterium that is injected into the tumor. It is being studied for its ability to shrink solid tumors.
  VNP40101M: A substance that is being studied as a treatment for cancer. It belongs to the family of drugs called alkylating agents.
  vocal cord: (VOH-kul kord)
    Pronunciation of dictionary term "vocal cord"
    One of two small bands of muscle within the larynx that vibrates to produce the voice.
    Anatomy of the larynx. The three parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.
    Anatomy of the larynx; drawing shows the epiglottis, supraglottis, glottis, subglottis, and vocal cords. Also shown are the tongue, trachea, and esophagus.
  vocational rehabilitation counselor: (voh-KAY-shuh-nul REE-huh-BIH-lih-TAY-shun KOWN-seh-ler)
    Pronunciation of dictionary term "vocational rehabilitation counselor"
    A person who has special training to help people with a disability find a job or career. A vocational rehabilitation counselor evaluates a person’s education, training, skills, interests, and financial needs to help him or her make employment decisions. A vocational rehabilitation counselor also monitors job performance and provides counseling, education, and resources for job-related issues and access to special accommodations in the workplace. Also called vocational therapist.
  vocational therapist: (voh-KAY-shuh-nul THAYR-uh-pist)
    Pronunciation of dictionary term "vocational therapist"
    A person who has special training to help people with a disability find a job or career. A vocational therapist evaluates a person’s education, training, skills, interests, and financial needs to help him or her make employment decisions. A vocational therapist also monitors job performance and provides counseling, education, and resources for job-related issues and access to special accommodations in the workplace. Also called vocational rehabilitation counselor.
  voice box: (voys …)
    Pronunciation of dictionary term "voice box"
    The area of the throat containing the vocal cords and used for breathing, swallowing, and talking. Also called larynx.
    More Information
    - Head and Neck Cancer (https://www.cancer.gov/types/head-and-neck)
    Laryngeal cancer forms in the tissues of the larynx (area of the throat that contains the vocal cords). The larynx includes the supraglottis, glottis (vocal cords), and subglottis. The cancer may spread to nearby tissues or to the thyroid, trachea, or esophagus. It may also spread to the lymph nodes in the neck, the carotid artery, the upper part of the spinal column, the chest, and to other parts of the body (not shown).
    Drawing shows areas where laryngeal cancer may form or spread, including the supraglottis, glottis (vocal cords), subglottis, thyroid, trachea, and esophagus. Also shown are the epiglottis, the upper part of the spinal column, the carotid artery, the cartilage around the thyroid and trachea, lymph nodes in the neck, and the chest.
  volociximab: (voh-loh-SIK-sih-mab)
    Pronunciation of dictionary term "volociximab"
    A monoclonal antibody that is being studied in the treatment of some types of cancer. Monoclonal antibodies are made in the laboratory and can locate and bind to substances in the body, including cancer cells. Volociximab binds to a protein that is found on cells that line some tumor blood vessels. It is a type of angiogenesis inhibitor. Also called M200.
  Voltaren: (vol-TAYR-en)
    Pronunciation of dictionary term "Voltaren"
    A drug that is used to treat the symptoms of rheumatoid arthritis and is being studied in the prevention and treatment of some types of skin cancer. It blocks substances that cause inflammation and pain. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of cyclooxygenase inhibitor, a type of nonsteroidal anti-inflammatory drug (NSAID), and a type of antiangiogenesis agent. Also called diclofenac sodium.
  Voltaren gel: (vol-TAYR-en jel)
    Pronunciation of dictionary term "Voltaren gel"
    The gel form of a drug that is used to treat the symptoms of rheumatoid arthritis and is being studied in the prevention and treatment of some types of skin cancer. It blocks substances that cause inflammation and pain. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of cyclooxygenase inhibitor, a type of nonsteroidal anti-inflammatory drug (NSAID), and a type of antiangiogenesis agent. Also called diclofenac sodium gel.
  vomiting: (VAH-mih-ting)
    Pronunciation of dictionary term "vomiting"
    The forceful ejection of some or all of the contents of the stomach through the mouth. Vomiting may be caused by many things, including certain smells, irritation to the stomach, infections, stress, pain, motion sickness, migraines, certain medicines, some diseases or conditions, and brain injury or concussion. It can also be a symptom of some cancers and a side effect of certain cancer treatments. Also called emesis.
    More Information
    - Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)
    - Nausea and vomiting - adults (MedlinePlus) (https://medlineplus.gov/ency/article/003117.htm)
  von Hippel-Lindau disease: (von HIH-pul-LIN-dow dih-ZEEZ)
    Pronunciation of dictionary term "von Hippel-Lindau disease"
    A rare, inherited disorder that causes tumors and cysts to grow in certain parts of the body, including the brain, spinal cord, eyes, inner ear, adrenal glands, pancreas, kidney, and reproductive tract. The tumors are usually benign (not cancer), but some may be malignant (cancer). Patients with von Hippel-Lindau disease have an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer. The signs and symptoms of von Hippel-Lindau disease usually do not appear until young adulthood. It is caused by a mutation (change) in the VHL gene. Also called VHL disease, VHL syndrome, and von Hippel-Lindau syndrome.
    More Information
    - Von Hippel-Lindau disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7855/von-hippel-lindau-disease)
    - Von Hippel-Lindau syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/von-hippel-lindau-syndrome/)
    Areas of the body affected by von Hippel-Lindau (VHL) disease. VHL disease is an inherited disorder that causes tumors and cysts to grow in certain areas of the body, including the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females). VHL disease also causes an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer.
    Drawing of a male figure and female figure showing areas of the body affected by von Hippel-Lindau disease. These areas include the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females).
  von Hippel-Lindau gene: (von HIH-pul-LIN-dow jeen)
    Pronunciation of dictionary term "von Hippel-Lindau gene"
    A gene that makes a protein that helps control cell growth, cell division, and other important cell functions. Mutated (changed) forms of the von Hippel-Lindau gene may increase the growth of cells, including abnormal cells. This mutated gene has been found in nearly all patients with an inherited condition called VHL syndrome. VHL syndrome can cause kidney cancer and tumors of the brain, spinal cord, eye, ear, adrenal glands, pancreas, or other parts of the body. The von Hippel-Lindau gene is a type of tumor suppressor gene. Also called VHL gene.
    More Information
    - Hereditary Kidney Cancer Syndromes
  von Hippel-Lindau syndrome: (von HIH-pul-LIN-dow SIN-drome)
    Pronunciation of dictionary term "von Hippel-Lindau syndrome"
    A rare, inherited disorder that causes tumors and cysts to grow in certain parts of the body, including the brain, spinal cord, eyes, inner ear, adrenal glands, pancreas, kidney, and reproductive tract. The tumors are usually benign (not cancer), but some may be malignant (cancer). Patients with von Hippel-Lindau syndrome have an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer. The signs and symptoms of von Hippel-Lindau syndrome usually do not appear until young adulthood. It is caused by a mutation (change) in the VHL gene. Also called VHL disease, VHL syndrome, and von Hippel-Lindau disease.
    More Information
    - Von Hippel-Lindau disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7855/von-hippel-lindau-disease)
    - Von Hippel-Lindau syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/von-hippel-lindau-syndrome/)
    Areas of the body affected by von Hippel-Lindau (VHL) disease. VHL disease is an inherited disorder that causes tumors and cysts to grow in certain areas of the body, including the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females). VHL disease also causes an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer.
    Drawing of a male figure and female figure showing areas of the body affected by von Hippel-Lindau disease. These areas include the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females).
  Vonjo: (VON-joh)
    Pronunciation of dictionary term "Vonjo"
    A drug used to treat adults with intermediate-risk or high-risk myelofibrosis (MF), including primary MF, post-polycythemia vera MF, and post-essential thrombocythemia MF. It is used in patients who have a very low blood platelet count. It is also being studied in the treatment of other conditions and some types of cancer. Vonjo blocks JAK2 and other proteins, which may help keep abnormal blood cells or cancer cells from growing. It is a type of kinase inhibitor. Also called pacritinib citrate.
    More Information
    - Pacritinib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/pacritinib-citrate)
  Voranigo: (voh-rah-NEE-goh)
    Pronunciation of dictionary term "Voranigo"
    A drug used to treat adults and children aged 12 years and older with grade 2 astrocytoma or oligodendroglioma (types of brain tumors) that has an abnormal IDH1 or IDH2 gene. It is used in patients who had a biopsy or surgery to remove the tumor. It is also being studied in the treatment of other types of cancer. Voranigo blocks the proteins made by the mutated IDH1 and IDH2 genes, which may help keep cancer cells from growing. It is a type of enzyme inhibitor and a type of targeted therapy. Also called vorasidenib citrate.
    More Information
    - Vorasidenib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/vorasidenib-citrate)
  vorasidenib citrate: (vor-uh-SIH-deh-nib SIH-trayt)
    Pronunciation of dictionary term "vorasidenib citrate"
    A drug used to treat adults and children aged 12 years and older with grade 2 astrocytoma or oligodendroglioma (types of brain tumors) that has an abnormal IDH1 or IDH2 gene. It is used in patients who had a biopsy or surgery to remove the tumor. It is also being studied in the treatment of other types of cancer. Vorasidenib citrate blocks the proteins made by the mutated IDH1 and IDH2 genes, which may help keep cancer cells from growing. It is a type of enzyme inhibitor and a type of targeted therapy. Also called Voranigo.
    More Information
    - Vorasidenib Citrate (https://www.cancer.gov/about-cancer/treatment/drugs/vorasidenib-citrate)
  Voraxaze: (vor-AK-sayz)
    Pronunciation of dictionary term "Voraxaze"
    A drug used to treat toxic levels of the anticancer drug methotrexate in the blood of adults and children with kidney problems. Voraxaze is a bacterial enzyme that helps break down and remove methotrexate from the body. It may also help certain drugs kill cancer cells. Voraxaze is a type of chemoprotective agent and a type of prodrug activator. Also called carboxypeptidase-G2 and glucarpidase.
    More Information
    - Glucarpidase (https://www.cancer.gov/about-cancer/treatment/drugs/glucarpidase)
  voriconazole: (VOR-ih-KAH-nuh-zole)
    Pronunciation of dictionary term "voriconazole"
    A drug that treats infections caused by fungi.
  vorinostat: (vor-IN-oh-stat)
    Pronunciation of dictionary term "vorinostat"
    A drug used to treat cutaneous T-cell lymphoma that came back, got worse, or did not get better during or after treatment with two systemic therapies. It is also being studied in the treatment of other types of cancer. Vorinostat blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase inhibitor. Also called SAHA, suberoylanilide hydroxamic acid, and Zolinza.
    More Information
    - Vorinostat (https://www.cancer.gov/about-cancer/treatment/drugs/vorinostat)
  vorozole: (VOR-uh-zole)
    Pronunciation of dictionary term "vorozole"
    A hormone therapy drug used to decrease the production of estrogen.
  Votrient: (VOH-tree-ent)
    Pronunciation of dictionary term "Votrient"
    A drug used to treat adults with advanced renal cell carcinoma (a type of kidney cancer) or advanced soft tissue sarcoma that has already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Votrient blocks certain proteins, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called GW786034 and pazopanib hydrochloride.
    More Information
    - Pazopanib Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/pazopanibhydrochloride)
  VP-16: The active ingredient in a drug used with other drugs to treat small cell lung cancer and certain types of testicular cancer. It is also being studied in the treatment of other types of cancer. VP-16 blocks a certain enzyme needed for cell division and DNA repair, and it may kill cancer cells. It is a type of podophyllotoxin derivative and a type of topoisomerase inhibitor. Also called etoposide.
    More Information
    - Etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
  vulva: (VUL-vuh)
    Pronunciation of dictionary term "vulva"
    The external female genital organs. The vulva includes the inner and outer lips of the vagina, the clitoris, the opening of the vagina and its glands, the opening of the urethra, and the mons pubis (the rounded area in front of the pubic bones that becomes covered with hair at puberty).
    More Information
    - Vulvar Cancer (https://www.cancer.gov/types/vulvar)
    Anatomy of the vulva. The vulva includes the mons pubis, clitoris, inner and outer lips of the vagina, and the openings of the urethra and vagina.
    Anatomy of the vulva; drawing shows the mons pubis, clitoris, urethral opening, inner and outer lips of the vagina, and the vaginal opening. Also shown are the perineum and anus.
  vulvar cancer: (VUL-ver KAN-ser)
    Pronunciation of dictionary term "vulvar cancer"
    Cancer of the vulva (the external female genital organs, including the clitoris, vaginal lips, and the opening to the vagina).
    More Information
    - Vulvar Cancer (https://www.cancer.gov/types/vulvar)
  vulvar carcinoma in situ: (VUL-ver KAR-sih-NOH-muh in SY-too)
    Pronunciation of dictionary term "vulvar carcinoma in situ"
    Abnormal cells are found on the surface of the vulvar skin. These abnormal cells may become cancer and spread into nearby tissue. Also called VIN and vulvar intraepithelial neoplasia.
    More Information
    - Vulvar Cancer Treatment
  vulvar intraepithelial neoplasia: (VUL-ver IN-truh-eh-pih-THEE-lee-ul NEE-oh-PLAY-zhuh)
    Pronunciation of dictionary term "vulvar intraepithelial neoplasia"
    Abnormal cells are found on the surface of the vulvar skin. These abnormal cells may become cancer and spread into nearby tissue. Also called VIN and vulvar carcinoma in situ.
    More Information
    - Vulvar Cancer Treatment
  VUS: A change in a gene’s DNA sequence that has an unknown effect on a person’s health. There is usually not enough information about a VUS to know whether it increases a person’s risk of developing a disease, such as cancer. Also called unclassified variant, variant of uncertain significance, and variant of unknown significance.
  VX 853: A drug being studied to make cancer cells less resistant to the effects of chemotherapy.
  VX-710: A drug being studied to make cancer cells less resistant to the effects of chemotherapy.
  Vyloy: (VY-loy)
    Pronunciation of dictionary term "Vyloy"
    A drug used with chemotherapy containing fluoropyrimidine and platinum to treat adults with gastric (stomach) cancer or gastroesophageal junction cancer that has the CLDN18.2 protein, is HER2-negative, and has spread to other parts of the body or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Vyloy binds to CLDN18.2, which is found on the surface of some cancer cells. This may help keep cancer cells from growing and may kill them. It is a type of monoclonal antibody. Also called zolbetuximab.
    More Information
    - Zolbetuximab-clzb (https://www.cancer.gov/about-cancer/treatment/drugs/zolbetuximab-clzb)
  Vyxeos: (VIK-see-os)
    Pronunciation of dictionary term "Vyxeos"
    A form of the anticancer drugs daunorubicin hydrochloride and cytarabine that is contained inside very tiny, fat-like particles and is used to treat adults with certain types of newly diagnosed acute myeloid leukemia. Vyxeos may have fewer side effects and work better than other forms of these drugs. It is also being studied in the treatment of other types of cancer. Vyxeos is a type of anthracycline antibiotic, a type of topoisomerase inhibitor, and a type of antimetabolite. Also called daunorubicin hydrochloride and cytarabine liposome.
    More Information
    - Daunorubicin Hydrochloride and Cytarabine Liposome (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochlorideandcytarabineliposome)
  WAGR syndrome: (... SIN-drome)
    Pronunciation of dictionary term "WAGR syndrome"
    A rare, genetic disorder that is present at birth and has two or more of the following features: Wilms tumor (a type of kidney cancer), Aniridia (little or no iris, which is the colored part of the eye), defects in the Genitourinary tract (organs of the reproductive and urinary systems), and a Range of developmental delays. This syndrome occurs when part of chromosome 11 is missing.
    More Information
    - WAGR syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5528/wilms-tumor-aniridia-genitourinary-anomalies-mental-retardation-syndrome)
    - WAGR syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/wagr-syndrome/)
  waitlist control: (WAYT-list kun-TROLE)
    Pronunciation of dictionary term "waitlist control"
    In a clinical trial, a group of participants who are on a waiting list to receive treatment. This group will be compared against the active treatment group and will also receive treatment.
  Waldenström macroglobulinemia: (VAHL-den-strum MA-kroh-GLAH-byoo-lih-NEE-mee-uh)
    Pronunciation of dictionary term "Waldenström macroglobulinemia"
    An indolent (slow-growing) type of non-Hodgkin lymphoma marked by abnormal levels of IgM antibodies in the blood and an enlarged liver, spleen, or lymph nodes. Also called lymphoplasmacytic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  Waldeyer’s ring: (VAL-dy-erz …)
    Pronunciation of dictionary term "Waldeyer’s ring"
    A ring of lymphoid tissue found in the throat. The Waldeyer’s ring is made up of the tonsils, adenoids, and other lymphoid tissue. It contains lymphocytes (a type of immune cell) that help the body fight infection and disease.
  warfarin: (WOR-fuh-rin)
    Pronunciation of dictionary term "warfarin"
    A drug that prevents blood from clotting. It belongs to the family of drugs called anticoagulants (blood thinners).
  warm ischemia: (… is-KEE-mee-uh)
    Pronunciation of dictionary term "warm ischemia"
    In surgery, keeping a tissue, organ, or body part at body temperature after its blood suppy has been reduced or cut off.
  warm ischemia time: (… is-KEE-mee-uh …)
    Pronunciation of dictionary term "warm ischemia time"
    In surgery, the time a tissue, organ, or body part remains at body temperature after its blood supply has been reduced or cut off but before it is cooled or reconnected to a blood supply.
  wart: (wort)
    Pronunciation of dictionary term "wart"
    A raised growth on the surface of the skin or other organ.
  wasting syndrome: (WAY-sting SIN-drome)
    Pronunciation of dictionary term "wasting syndrome"
    A condition marked by a loss of more than 10% of body weight, including loss of muscle mass and fat, in a person who is not trying to lose weight. Some people with wasting syndrome may also have diarrhea or weakness and fever that have lasted at least 30 days. Wasting syndrome is a sign of malnutrition and can happen when there are changes in the way the body uses nutrients from food. This may be caused by certain factors, such as inflammation and increased metabolism. Wasting syndrome is most common in people with advanced cancer or other chronic diseases, such as AIDS, chronic obstructive pulmonary disease, and congestive heart failure. Wasting syndrome is hard to reverse once it starts and usually happens at the end of life. Also called cachexia.
    More Information
    - Cancer Cachexia (https://www.cancer.gov/about-cancer/treatment/side-effects/cancer-cachexia)
  watchful waiting: (WACH-ful WAY-ting)
    Pronunciation of dictionary term "watchful waiting"
    Closely watching a patient’s condition but not giving any treatment unless signs or symptoms appear or change. Watchful waiting may be used when the risks of treatment or repeated tests, such as biopsies, are greater than the possible benefits. During watchful waiting, certain exams and tests may be done periodically to monitor the condition. Watchful waiting is sometimes used in certain types of prostate cancer. It is a type of expectant management.
  water deprivation test: (WAH-ter DEH-prih-VAY-shun …)
    Pronunciation of dictionary term "water deprivation test"
    A test to measure how much urine is made and how concentrated it becomes when no water is given to a patient for a certain amount of time. This test is used to see how well the kidneys work and to help diagnose diabetes insipidus (a condition in which a person is very thirsty and makes large amounts of urine). Also called fluid deprivation test.
  water pipe: (WAH-ter …)
    Pronunciation of dictionary term "water pipe"
    A device used to smoke a special type of tobacco that comes in different flavors. In a water pipe, charcoal is used to heat the tobacco. The smoke from the heated tobacco is cooled by passing it through a water-filled bowl. It is then inhaled through a flexible tube with a mouthpiece. Water pipe tobacco smoke contains nicotine and many cancer-causing chemicals that are harmful to both smokers and nonsmokers. Water pipe smoking can lead to nicotine addiction and can cause many of the same health problems as cigarette smoking. Water pipe smoking is not safer than cigarette smoking. Also called hookah.
  water-soluble vitamin: (… SOL-yoo-bul VY-tuh-min)
    Pronunciation of dictionary term "water-soluble vitamin"
    A vitamin that can dissolve in water. Vitamins are nutrients that the body needs in small amounts to stay healthy and work the way it should. Water-soluble vitamins are carried to the body's tissues but are not stored in the body. They are found in many plant and animal foods and in dietary supplements and must be taken in daily. Vitamin C and members of the vitamin B complex are water-soluble.
  watercress: (WAH-ter-kres)
    Pronunciation of dictionary term "watercress"
    Parts of the flowering plant have been used in some cultures to treat certain medical problems. It may have anticancer effects. The scientific name is Nasturtium officinale. Also called Indian cress.
  WBC: A type of blood cell that is made in the bone marrow and found in the blood and lymph tissue. WBCs are part of the body’s immune system. They help the body fight infection and other diseases. Types of WBCs are granulocytes (neutrophils, eosinophils, and basophils), monocytes, and lymphocytes (T cells and B cells). Checking the number of WBCs in the blood is usually part of a complete blood cell (CBC) test. It may be used to look for conditions such as infection, inflammation, allergies, and leukemia. Also called leukocyte and white blood cell.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  WBRT: A type of external radiation therapy used to treat patients who have cancer in the brain. It is often used to treat patients whose cancer has spread to the brain, or who have more than one tumor or tumors that cannot be removed by surgery. Radiation is given to the whole brain over a period of many weeks. Also called whole-brain radiation therapy and whole-brain radiotherapy.
  wedge resection: (wej ree-SEK-shun)
    Pronunciation of dictionary term "wedge resection"
    Surgery to remove a triangle-shaped slice of tissue. It may be used to remove a tumor and a small amount of normal tissue around it.
    Wedge resection of the lung. Part of the lung lobe containing the cancer and a small amount of healthy tissue around it is removed.
    Wedge resection of the lung; shows trachea and lungs with cancer in a lung lobe. The removed lung tissue with the cancer and small amount of healthy tissue around it is shown next to the lung lobe it was removed from.
  WEE1 protein: (… PROH-teen)
    Pronunciation of dictionary term "WEE1 protein"
    A protein that is found inside the nucleus of a cell and plays a key role in controlling how cells grow and divide. The WEE1 protein may be found in higher-than-normal amounts in some types of cancer cells. This may cause cancer cells to grow and spread. Drugs that block the WEE1 protein are being studied in the treatment of some types of cancer. The WEE1 protein is a type of tyrosine kinase.
  weight loss surgery: (wayt los SER-juh-ree)
    Pronunciation of dictionary term "weight loss surgery"
    Surgery done to help people who are obese lose weight. There are different types of weight loss surgery, and each type changes the way the digestive system works. Some types make the stomach smaller, which decreases the amount of food that it can hold so the person feels full sooner and eats less. Other types make changes to the stomach and the small intestine, which decreases the nutrients and calories that are absorbed from food. Weight loss surgery can improve many obesity-related health problems, such as diabetes, high blood pressure, unhealthy cholesterol levels, sleep apnea, and knee, hip, or other body pain. Having weight loss surgery may also decrease the risk of some cancers, including endometrial cancer. Also called bariatric surgery.
    More Information
    - Obesity and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/obesity/obesity-fact-sheet)
  Welireg: (WEL-ih-reg)
    Pronunciation of dictionary term "Welireg"
    A drug used to treat adults with renal cell carcinoma (a type of kidney cancer) that is advanced and adults with certain cancers linked to von Hippel-Lindau disease that do not need surgery right away, including renal cell carcinoma, central nervous system hemangioblastoma (a type of blood vessel tumor), and pancreatic neuroendocrine tumor. It is also being studied in the treatment of other types of cancer. Welireg blocks a certain protein, which may help keep tumor cells from growing and may kill them. It may also prevent the growth of new blood vessels that tumors need to grow. Also called belzutifan.
    More Information
    - Belzutifan (https://www.cancer.gov/about-cancer/treatment/drugs/belzutifan)
  well-differentiated: (... DIH-feh-REN-shee-AY-ted)
    Pronunciation of dictionary term "well-differentiated"
    A term used to describe cells and tissue that have mature (specialized) structures and functions. In cancer, well-differentiated cancer cells look more like normal cells under a microscope and tend to grow and spread more slowly than poorly differentiated or undifferentiated cancer cells.
  well-differentiated lymphocytic lymphoma: (... DIH-feh-REN-shee-AY-ted LIM-foh-SIH-tik lim-FOH-muh)
    Pronunciation of dictionary term "well-differentiated lymphocytic lymphoma"
    An indolent (slow-growing) type of lymphoma in which too many immature lymphocytes (white blood cells) are found mostly in the lymph nodes. This causes the lymph nodes to become larger than normal. Sometimes cancer cells are found in the blood and bone marrow, and the disease is called chronic lymphocytic leukemia. The disease is most often seen in people older than 50 years. Well-differentiated lymphocytic lymphoma is a type of non-Hodgkin Lymphoma. Also called SLL and small lymphocytic lymphoma.
    More Information
    - Lymphoma (https://www.cancer.gov/types/lymphoma)
  Wellbutrin: (wel-BYOO-trin)
    Pronunciation of dictionary term "Wellbutrin"
    A drug used to treat depression and certain other disorders. It is also used to help people stop smoking. Wellbutrin increases the levels of the chemicals dopamine, serotonin, and norepinephrine in the brain. This helps improve mood and can lessen cravings for nicotine. It is a type of antidepressant and a type of nicotine receptor antagonist. Also called bupropion hydrochloride and Zyban.
  Wellcovorin: (wel-koh-VOR-in)
    Pronunciation of dictionary term "Wellcovorin"
    A drug used to lessen the toxic effects of the anticancer drug methotrexate or other substances that block the action of folic acid. It is also used to treat some types of anemia and is used with fluorouracil to treat advanced colorectal cancer. It is also being studied in the treatment of other conditions and types of cancer. Wellcovorin is a form of folic acid. It is a type of chemoprotective agent and a type of chemosensitizing agent. Also called calcium levoleucovorin, citrovorum factor, folinic acid, Fusilev, and leucovorin calcium.
  Wermer syndrome: (WER-mer SIN-drome)
    Pronunciation of dictionary term "Wermer syndrome"
    A rare, inherited disorder that affects the endocrine glands and can cause tumors in the parathyroid and pituitary glands and the pancreas. These tumors are usually benign (not cancer). They cause the glands to secrete high levels of hormones, which can lead to other medical problems, such as kidney stones, fertility problems, and severe ulcers. In some cases, tumors inside the pancreas can become malignant (cancer). Also called MEN1 syndrome, multiple endocrine adenomatosis, and multiple endocrine neoplasia type 1 syndrome.
    More Information
    - Multiple endocrine neoplasia type 1 (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/3829/multiple-endocrine-neoplasia-type-1)
    - Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment
    Multiple endocrine neoplasia 1 (MEN1) syndrome is a rare, inherited disorder that affects the endocrine glands or organs. MEN1 syndrome usually causes pituitary gland, parathyroid gland, or pancreas tumors. The tumors may be benign (not cancer) or malignant (cancer).
    Drawing shows parts of the body affected by MEN1 syndrome, including the pituitary gland, parathyroid glands, and pancreas. There is also an inset that shows the back view of the thyroid gland with the four pea-sized parathyroid glands.
  Werner syndrome: (VER-ner SIN-drome)
    Pronunciation of dictionary term "Werner syndrome"
    A rare, inherited disorder marked by rapid aging that begins in early adolescence or young adulthood and an increased risk of cancer. Signs and symptoms include shorter-than-average height, thinning and graying hair, skin changes, thin arms and legs, voice changes, and unusual facial features. This disorder can also lead to health problems, such as cataracts, skin ulcers, severe hardening of the arteries, diabetes, osteoporosis, and fertility problems. People with Werner syndrome have an increased risk of cancer, especially thyroid cancer, skin cancer, and sarcoma (a type of bone or soft tissue cancer). Werner syndrome is caused by a mutation (change) in the WRN gene, which makes a protein involved in DNA repair. Also called adult progeria and WS.
    More Information
    - Werner syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7885/werner-syndrome)
    - Werner syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/werner-syndrome/)
  WES: A laboratory method that is used to learn the exact order of all the building blocks that make up the pieces of a person’s DNA that contain information for making proteins. These pieces, called exons, are thought to make up about 1% of a person’s genome (complete set of DNA). WES is used to find mutations (changes) in genes that may cause diseases, such as cancer. Also called whole exome sequencing and WXS.
  Western medicine: (WES-tern MEH-dih-sin)
    Pronunciation of dictionary term "Western medicine"
    A system in which medical doctors and other health care professionals (such as nurses, pharmacists, and therapists) treat symptoms and diseases using drugs, radiation, or surgery. Also called allopathic medicine, biomedicine, conventional medicine, mainstream medicine, and orthodox medicine.
  WGS: A laboratory method that is used to learn the exact order of all of the building blocks (nucleotides) that make up a person’s genome (complete set of DNA). WGS is used to find changes that may cause diseases, such as cancer. Also called whole genome sequencing.
  wheezing: (WEE-zing)
    Pronunciation of dictionary term "wheezing"
    A high-pitched, whistling sound that can occur during breathing when the airways in the lungs become narrowed or blocked. Wheezing is a sign that a person may be having trouble breathing. There are many causes of wheezing, but the most common causes are asthma, chronic obstructive pulmonary disease, bronchitis, and pulmonary edema. Other causes include cystic fibrosis, pneumonia or other respiratory infections, breathing a foreign object into the lungs, congestive heart failure, vocal cord problems, acid reflux disease, allergies, severe allergic reactions, certain medicines, smoking, or a tumor in the lung or airway.
  whey protein powder: (way PROH-teen …)
    Pronunciation of dictionary term "whey protein powder"
    A powdered form of proteins taken from whey, which is the liquid left over when cheese is made from cow’s milk. Whey protein powder is used to increase protein in the diet and is being studied for possible health benefits.
  Whipple procedure: (HWIH-pul proh-SEE-jer)
    Pronunciation of dictionary term "Whipple procedure"
    A type of surgery used to treat pancreatic cancer. The head of the pancreas, the duodenum, a portion of the stomach, and other nearby tissues are removed. Also called pancreatoduodenectomy.
  white blood cell: (hwite blud sel)
    Pronunciation of dictionary term "white blood cell"
    A type of blood cell that is made in the bone marrow and found in the blood and lymph tissue. White blood cells are part of the body’s immune system. They help the body fight infection and other diseases. Types of white blood cells are granulocytes (neutrophils, eosinophils, and basophils), monocytes, and lymphocytes (T cells and B cells). Checking the number of white blood cells in the blood is usually part of a complete blood cell (CBC) test. It may be used to look for conditions such as infection, inflammation, allergies, and leukemia. Also called leukocyte and WBC.
    Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.
    Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.
  Whitmore-Jewett staging system: (WIT-mor-JOO-et STAY-jing SIS-tem)
    Pronunciation of dictionary term "Whitmore-Jewett staging system"
    A staging system for prostate cancer that uses ABCD. “A” and “B” refer to cancer that is confined to the prostate. “C” refers to cancer that has grown out of the prostate but has not spread to lymph nodes or other places in the body. “D” refers to cancer that has spread to lymph nodes or to other places in the body. Also called ABCD rating and Jewett staging system.
  WHO: A part of the United Nations that deals with major health issues around the world. The WHO sets standards for disease control, health care, and medicines; conducts education and research programs; and publishes scientific papers and reports. A major goal is to improve access to health care for people in developing countries and in groups who do not get good health care. The headquarters are located in Geneva, Switzerland. Also called World Health Organization.
    More Information
    - World Health Organization (https://www.who.int/)
  whole cell vaccine: (hole sel vak-SEEN)
    Pronunciation of dictionary term "whole cell vaccine"
    Vaccine made from whole tumor cells that have been changed in the laboratory.
  whole exome sequencing: (hole EK-some SEE-kwen-sing)
    Pronunciation of dictionary term "whole-exome sequencing"
    A laboratory method that is used to learn the exact order of all the building blocks that make up the pieces of a person’s DNA that contain information for making proteins. These pieces, called exons, are thought to make up about 1% of a person’s genome (complete set of DNA). Whole exome sequencing is used to find mutations (changes) in genes that may cause diseases, such as cancer. Also called WES and WXS.
  whole genome sequencing: (hole JEE-nome SEE-kwen-sing)
    Pronunciation of dictionary term "whole-genome sequencing"
    A laboratory method that is used to learn the exact order of all of the building blocks (nucleotides) that make up a person’s genome (complete set of DNA). Whole genome sequencing is used to find changes that may cause diseases, such as cancer. Also called WGS.
  whole-brain radiation therapy: (hole-brayn RAY-dee-AY-shun THAYR-uh-pee)
    Pronunciation of dictionary term "whole-brain radiation therapy"
    A type of external radiation therapy used to treat patients who have cancer in the brain. It is often used to treat patients whose cancer has spread to the brain, or who have more than one tumor or tumors that cannot be removed by surgery. Radiation is given to the whole brain over a period of many weeks. Also called WBRT and whole-brain radiotherapy.
  whole-brain radiotherapy: (hole-brayn RAY-dee-oh-THAYR-uh-pee)
    Pronunciation of dictionary term "whole-brain radiotherapy"
    A type of external radiation therapy used to treat patients who have cancer in the brain. It is often used to treat patients whose cancer has spread to the brain, or who have more than one tumor or tumors that cannot be removed by surgery. Radiation is given to the whole brain over a period of many weeks. Also called WBRT and whole-brain radiation therapy.
  whooping cough: (HWOOP-ing kof)
    Pronunciation of dictionary term "whooping cough"
    A serious bacterial infection of the lungs and breathing tubes that spreads easily. Whooping cough begins like a cold, but develops into severe coughing and gasping for air. Long spells of coughing may cause vomiting, and broken blood vessels in the eyes and on the skin. Also called pertussis.
  wide local excision: (…LOH-kul ek-SIH-zhun)
    Pronunciation of dictionary term "wide local excision"
    A surgical procedure in which a scalpel (a sharp knife) is used to cut out a tumor or other abnormal lesion and some normal tissue around it. The amount of normal tissue removed depends on how deep or how large the tumor being removed is. A wide local excision is often done to remove some types of skin cancer or breast cancer.
  wild clover: (wilde KLOH-ver)
    Pronunciation of dictionary term "wild clover"
    Trifolium pratense. A plant with flowers that has been used in some cultures to treat certain medical problems. It is being studied in the relief of menopausal symptoms and may have anticancer effects. Also called purple clover, red clover, and Trifolium pratense.
  wild-type gene: (... jeen)
    Pronunciation of dictionary term "wild-type gene"
    A term used to describe a gene when it is found in its natural, non-mutated (unchanged) form. Mutated (changed) forms of certain genes have been found in some types of cancer. Knowing whether a patient’s tumor has a wild-type or mutated gene may help plan cancer treatment.
  wild-type KRAS gene: (… KAY-ras jeen)
    Pronunciation of dictionary term "wild-type KRAS gene"
    A term used to describe a gene called KRAS when it is found in its natural, non-mutated (unchanged) form. The KRAS gene makes a protein that is involved in cell signaling pathways that control cell growth, cell maturation, and cell death. Mutated (changed) forms of the KRAS gene have been found in some types of cancer, including non-small cell lung cancer, colorectal cancer, and pancreatic cancer. Knowing whether a patient’s tumor has a wild-type or mutated KRAS gene may help plan cancer treatment.
  will: (wil)
    Pronunciation of dictionary term "will"
    A legal document in which a person states what is to be done with his or her property after death, who is to carry out the terms of the will, and who is to care for any minor children.
  Wilms tumor: (wilmz TOO-mer)
    Pronunciation of dictionary term "Wilms tumor"
    A disease in which malignant (cancer) cells are found in the kidney, and may spread to the lungs, liver, or nearby lymph nodes. Wilms tumor usually occurs in children younger than 5 years old.
    More Information
    - Kidney (Renal Cell) Cancer (https://www.cancer.gov/types/kidney)
    Anatomy of the urinary system showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the spine and adrenal glands. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.
    Anatomy of the urinary system; drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The spine and adrenal glands are also shown.
  Wilms tumor-aniridia-genitourinary anomalies-mental retardation syndrome: (wilmz TOO-mer-a-nih-RIH-dee-uh-JEH-nih-toh-YOOR-ih-nayr-ee uh-NAH-muh-leez-MEN-tul ree-tar-DAY-shun SIN-drome)
    Pronunciation of dictionary term "Wilms tumor-aniridia-genitourinary anomalies-mental retardation syndrome"
    A rare, genetic disorder that is present at birth and has two or more of the following symptoms: Wilms tumor (a type of kidney cancer); little or no iris (the colored part of the eye); defects in the sexual organs and urinary tract (the organs that make urine and pass it from the body); and below average mental ability. This syndrome occurs when part of chromosome 11 is missing. Also called WAGR syndrome.
    More Information
    - WAGR syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/5528/wilms-tumor-aniridia-genitourinary-anomalies-mental-retardation-syndrome)
    - WAGR syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/wagr-syndrome/)
  Wilson disease: (WIL-sun dih-ZEEZ)
    Pronunciation of dictionary term "Wilson disease"
    A rare, inherited disorder in which too much copper builds up in the body. The extra copper is stored in the body’s tissues and organs, especially in the liver, brain, and eyes. This can cause liver disease, central nervous system (brain and spinal cord) problems, and mental problems. Signs and symptoms of Wilson disease include yellowing of the skin and the whites of the eyes, a gold or brown ring around the colored part of the eyes, swelling in the abdomen and legs, fatigue, loss of appetite, problems with speech and swallowing, uncontrolled movements or muscle stiffness, anxiety, depression, and mood swings. Wilson disease is caused by mutations (changes) in the ATP7B gene. It is a genetic disorder that is inherited in an autosomal recessive manner and is usually diagnosed in teens and young adults. It is a type of copper storage disease. Also called hepatolenticular degeneration.
    More Information
    - Wilson disease (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7893/wilson-disease)
    - Wilson disease (MedlinePlus) (https://medlineplus.gov/genetics/condition/wilson-disease/)
    Autosomal recessive inheritance is a way a genetic trait or condition can be passed down from parent to child. A genetic condition can occur when the child inherits one copy of a mutated (changed) gene from each parent. The parents of a child with an autosomal recessive condition usually do not have the condition. Unaffected parents are called carriers because they each carry one copy of the mutated gene and can pass it to their children.
    Drawing showing an autosomal recessive inheritance pattern between a father, mother, and their four children: an unaffected father (carrier) with a mutated gene and a normal gene on a chromosome pair; an unaffected mother (carrier) with a mutated gene and a normal gene; an unaffected daughter with two normal genes; an unaffected son (carrier) with a mutated gene and a normal gene; an unaffected daughter (carrier) with a mutated gene and a normal gene; and an affected son with two mutated genes.
  windpipe: (WIND-pipe)
    Pronunciation of dictionary term "windpipe"
    The airway that leads from the larynx (voice box) to the bronchi (large airways that lead to the lungs). Also called trachea.
    Anatomy of the respiratory system showing the trachea, the right and left lungs and their lobes, and the bronchi. The lymph nodes and the diaphragm are also shown. Oxygen is inhaled into the lungs and passes through the alveoli (the tiny air sacs at the end of the bronchioles) and into the bloodstream (see inset), where it travels to the tissues throughout the body.
    Respiratory system anatomy; drawing shows the right lung with the upper, middle, and lower lobes, the left lung with the upper and lower lobes, and the trachea, bronchi, lymph nodes, and diaphragm. An inset shows the bronchioles, alveoli, artery, and vein.
  wire localization: (... LOH-kuh-lih-ZAY-shun)
    Pronunciation of dictionary term "wire localization"
    A procedure used to mark a small area of abnormal tissue so it can be removed by surgery. An imaging device is used to guide a thin wire with a hook at the end through a hollow needle to place the wire in or around the abnormal area. Once the wire is in the right place, the needle is removed and the wire is left in place so the doctor will know where the abnormal tissue is. The wire is removed when a biopsy is done. Also called needle localization and needle/wire localization.
  wireless capsule endoscope: (WY-er-les KAP-sul EN-doh-SKOPE)
    Pronunciation of dictionary term "wireless capsule endoscope"
    A device used to look at the inside of the intestines and other parts of the digestive tract. It is a capsule that is about the size of a large pill, with a lens, a light, a camera, a radio transmitter, and a battery inside. The patient swallows the capsule and it takes pictures as it travels through the digestive tract. The pictures are sent to a small recorder that is worn on the patient’s waist or shoulder. The pictures are then viewed on a computer by the doctor to check for signs of disease. The wireless capsule endoscope passes out of the body during a bowel movement. Also called capsule endoscope.
  wisdom tooth: (WIZ-dum tooth)
    Pronunciation of dictionary term "wisdom tooth"
    The last tooth to come in at the back of each side of the upper and lower jaws. These teeth usually come in between 17 and 23 years of age, but not everyone has them. Also called third molar.
  Wiskott-Aldrich syndrome: (WIS-kot-ALL-drich SIN-drome)
    Pronunciation of dictionary term "Wiskott-Aldrich syndrome"
    An inherited immune disorder that occurs in young boys. It causes eczema (a type of skin inflammation), a decrease in the number of platelets (blood cells that help prevent bleeding), and frequent bacterial infections. People with Wiskott-Aldrich syndrome are at increased risk of developing leukemia and lymphoma. Also called Aldrich syndrome.
    More Information
    - Wiskott Aldrich syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7895/wiskott-aldrich-syndrome)
    - Wiskott-Aldrich syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/wiskott-aldrich-syndrome/)
  withdrawal: (with-DRAWL)
    Pronunciation of dictionary term "withdrawal"
    A term used to describe the physical and mental symptoms that a person has when they suddenly stop or cut back the use of an addictive substance, such as opiates and opioids, nicotine products, or alcohol. The withdrawal symptoms that a person has depend on many factors, such as the substance that was used, how often it was used, and the length of time it was used.
    More Information
    - Handling Nicotine Withdrawal and Triggers When You Decide To Quit Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/withdrawal-fact-sheet)
    - Opiate and opioid withdrawal (MedlinePlus) (https://medlineplus.gov/ency/article/000949.htm)
  Wobe-Mugos E: (wobe-myoo-gos …)
    Pronunciation of dictionary term "Wobe-Mugos E"
    A mixture made from an extract of the calf thymus gland and enzymes (proteins that speed up chemical reactions in the body) from the papaya plant, the pancreas of cows, and the pancreas of pigs. It has been used in Europe as a treatment for a variety of cancers and for herpes virus infections.
  WOC nurse: (… nurs)
    Pronunciation of dictionary term "WOC nurse"
    A registered nurse who has additional education and training in how to care for people who have a wound, an ostomy (an opening made by surgery, from an area inside the body to the outside), or problems with continence (ability to control the flow of urine or the passage of stool). Also called wound, ostomy, and continence nurse.
  womb: (woom)
    Pronunciation of dictionary term "womb"
    The hollow, pear-shaped organ in a woman's pelvis. The womb is where a fetus (unborn baby) develops and grows. Also called uterus.
    More Information
    - Uterine Cancer (https://www.cancer.gov/types/uterine)
    Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.
    Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.
  wood alcohol: (… AL-kuh-hol)
    Pronunciation of dictionary term "wood alcohol"
    A type of alcohol used to make antifreeze, pesticides, windshield wiper fluid, paint thinner, certain types of fuel, and other substances. Wood alcohol catches fire easily and is very poisonous. It is one of many harmful chemicals found in tobacco smoke. Also called methanol and methyl alcohol.
  World Health Organization: (wurld helth OR-guh-nih-ZAY-shun)
    Pronunciation of dictionary term "World Health Organization"
    A part of the United Nations that deals with major health issues around the world. The World Health Organization sets standards for disease control, health care, and medicines; conducts education and research programs; and publishes scientific papers and reports. A major goal is to improve access to health care for people in developing countries and in groups who do not get good health care. The headquarters are located in Geneva, Switzerland. Also called WHO.
    More Information
    - World Health Organization (https://www.who.int/)
  wound: (woond)
    Pronunciation of dictionary term "wound"
    A break in the skin or other body tissues caused by injury or surgical incision (cut).
  wound, ostomy, and continence nurse: (woond OS-toh-mee ... KON-tih-nents ...)
    Pronunciation of dictionary term "wound, ostomy, and continence nurse"
    A registered nurse who has additional education and training in how to care for people who have a wound, an ostomy (an opening made by surgery, from an area inside the body to the outside), or problems with continence (ability to control the flow of urine or the passage of stool). Also called WOC nurse.
  WRAP53 gene: (… jeen)
    Pronunciation of dictionary term "WRAP53 gene"
    A gene that makes a protein involved in the function of telomeres (the ends of chromosomes), which help keep chromosomes from sticking together or breaking down. Mutations (changes) in the WRAP53 gene may cause damage to chromosomes and DNA, which may lead to abnormal cell growth. WRAP53 gene mutations have been found in a rare, inherited condition called dyskeratosis congenita, which causes abnormal changes in the skin and nails and white patches inside the mouth. People with this condition have an increased risk of bone marrow failure (a condition in which the bone marrow does not make enough blood cells), myelodysplastic syndrome, pulmonary fibrosis (scarring of the lungs), and certain types of cancer.
  WRN gene: (… jeen)
    Pronunciation of dictionary term "WRN gene"
    A gene that makes a protein involved in unwinding DNA and repairing damaged DNA. Mutations (changes) in the WRN gene may keep cells from repairing their DNA, which may cause abnormal cells, including cancer cells, to grow. WRN gene mutations have been found in many types of cancer and in an inherited condition called Werner syndrome, which increases the risk of certain types of cancer.
    More Information
    - WRN gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/wrn/)
  WS: A rare, inherited disorder marked by rapid aging that begins in early adolescence or young adulthood and an increased risk of cancer. Signs and symptoms include shorter-than-average height, thinning and graying hair, skin changes, thin arms and legs, voice changes, and unusual facial features. This disorder can also lead to health problems, such as cataracts, skin ulcers, severe hardening of the arteries, diabetes, osteoporosis, and fertility problems. People with WS have an increased risk of cancer, especially thyroid cancer, skin cancer, and sarcoma (a type of bone or soft tissue cancer). WS is caused by a mutation (change) in the WRN gene, which makes a protein involved in DNA repair. Also called adult progeria and Werner syndrome.
    More Information
    - Werner syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7885/werner-syndrome)
    - Werner syndrome (MedlinePlus) (https://medlineplus.gov/genetics/condition/werner-syndrome/)
  WX-671: A substance being studied in the treatment of several types of cancer. It blocks the action of certain enzymes, and it may help keep cancer cells from growing and spreading. It is a type of serine protease inhibitor.
  WXS: A laboratory method that is used to learn the exact order of all the building blocks that make up the pieces of a person’s DNA that contain information for making proteins. These pieces, called exons, are thought to make up about 1% of a person’s genome (complete set of DNA). WXS is used to find mutations (changes) in genes that may cause diseases, such as cancer. Also called WES and whole exome sequencing.
  X-linked dominant inheritance: (... linkt DAH-mih-nunt in-HAYR-ih-tunts)
    Pronunciation of dictionary term "X-linked dominant inheritance"
    One of the ways a genetic trait or condition caused by a mutated (changed) gene on the X chromosome can be passed down (inherited) from parent to child. In X-linked dominant inheritance, a genetic condition can occur when the child inherits one copy of a mutated (changed) gene on the X chromosome from one parent. Daughters have a 50% chance of inheriting the mutated X-linked gene from their mother and a 100% chance of inheriting the mutated X-linked gene from their father. Sons have a 50% chance of inheriting the mutated X-linked gene from their mother and a 0% chance of inheriting the mutated X-linked gene from their father.
    X-linked dominant inheritance is a way a genetic trait or condition can be passed down from parent to child through mutations (changes) in a gene on a single X chromosome. In females (who have two X chromosomes), a mutation in a gene on one of the X chromosomes is enough to cause the condition. In males (who only have one X chromosome), a mutation in the copy of the gene on the single X chromosome causes the condition. Fathers cannot pass X-linked dominant conditions to their sons, but all daughters of affected fathers will be affected with the condition and can pass it on to their children.
    Drawing showing an X-linked dominant inheritance pattern between a father, mother, and their children. The panel on the left shows an affected father (who only has one X chromosome) with a mutated (changed) gene on the X chromosome; an unaffected mother (who has two X chromosomes) with a normal gene on both X chromosomes; an affected daughter (who has two X chromosomes) with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an unaffected son (who only has one X chromosome) with a normal gene on the X chromosome. The panel on the right shows an unaffected father with a normal gene on the X chromosome; an affected mother with a normal gene on one X chromosome and a mutated gene on the other X chromosome; an unaffected daughter with a normal gene on both X chromosomes; an unaffected son with a normal gene on the X chromosome; an affected daughter with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an affected son with a mutated gene on the X chromosome.
    X-linked dominant inheritance is a way a genetic trait or condition can be passed down from parent to child through mutations (changes) in a gene on a single X chromosome. In females (who have two X chromosomes), a mutation in a gene on one of the X chromosomes is enough to cause the condition. In males (who only have one X chromosome), a mutation in the copy of the gene on the single X chromosome causes the condition. Fathers cannot pass X-linked dominant conditions to their sons, but all daughters of affected fathers will be affected with the condition and can pass it on to their children.
    Drawing showing an X-linked dominant inheritance pattern between a father, mother, and their children. The panel on the left shows an affected father (who only has one X chromosome) with a mutated (changed) gene on the X chromosome; an unaffected mother (who has two X chromosomes) with a normal gene on both X chromosomes; an affected daughter (who has two X chromosomes) with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an unaffected son (who only has one X chromosome) with a normal gene on the X chromosome. The panel on the right shows an unaffected father with a normal gene on the X chromosome; an affected mother with a normal gene on one X chromosome and a mutated gene on the other X chromosome; an unaffected daughter with a normal gene on both X chromosomes; an unaffected son with a normal gene on the X chromosome; an affected daughter with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an affected son with a mutated gene on the X chromosome.
  X-linked recessive inheritance: (…. linkt reh-SEH-siv in-HAYR-ih-tunts)
    Pronunciation of dictionary term "X-linked recessive inheritance"
    One of the ways a genetic trait or condition caused by a mutated (changed) gene on the X chromosome can be passed down (inherited) from parent to child. In X-linked recessive inheritance, a daughter inherits a single mutated gene on the X chromosome from one of her parents. The X chromosome she inherits from the other parent will usually cancel the effect of the mutation, and she most likely will not have the genetic condition. If she inherits a mutated copy of the gene from both parents, she will be affected with the condition. Fathers cannot pass X-linked recessive conditions to their sons. When a son inherits a mutated gene on the X chromosome from his mother, the genetic condition is more likely to occur. X-linked recessive conditions most often occur in males.
    X-linked recessive inheritance is a way a genetic trait or condition can be passed down from parent to child through mutations (changes) in a gene on the X chromosome. In males (who only have one X chromosome), a mutation in the copy of the gene on the single X chromosome causes the condition. Females (who have two X chromosomes) must have a mutation on both X chromosomes in order to be affected with the condition. If only the father or the mother has the mutated X-linked gene, the daughters are usually not affected and are called carriers because one of their X chromosomes has the mutation but the other one is normal. Sons will be affected if they inherit the mutated X-linked gene from their mother. Fathers cannot pass X-linked recessive conditions to their sons.
    Drawing showing an X-linked recessive inheritance pattern between a father, mother, and their children. The panel on the left shows an affected father (who only has one X chromosome) with a mutated (changed) gene on the X chromosome; an unaffected mother (who has two X chromosomes) with a normal gene on both X chromosomes; an unaffected daughter (carrier), who has two X chromosomes, with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an unaffected son (who only has one X chromosome) with a normal gene on the X chromosome. The panel on the right shows an unaffected father with a normal gene on the X chromosome; an affected mother (carrier) with a normal gene on one X chromosome and a mutated gene on the other X chromosome; an unaffected daughter with a normal gene on both X chromosomes; an unaffected son with a normal gene on the X chromosome; an unaffected daughter (carrier) with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an affected son with a mutated gene on the X chromosome.
    X-linked recessive inheritance is a way a genetic trait or condition can be passed down from parent to child through mutations (changes) in a gene on the X chromosome. In males (who only have one X chromosome), a mutation in the copy of the gene on the single X chromosome causes the condition. Females (who have two X chromosomes) must have a mutation on both X chromosomes in order to be affected with the condition. If only the father or the mother has the mutated X-linked gene, the daughters are usually not affected and are called carriers because one of their X chromosomes has the mutation but the other one is normal. Sons will be affected if they inherit the mutated X-linked gene from their mother. Fathers cannot pass X-linked recessive conditions to their sons.
    Drawing showing an X-linked recessive inheritance pattern between a father, mother, and their children. The panel on the left shows an affected father (who only has one X chromosome) with a mutated (changed) gene on the X chromosome; an unaffected mother (who has two X chromosomes) with a normal gene on both X chromosomes; an unaffected daughter (carrier), who has two X chromosomes, with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an unaffected son (who only has one X chromosome) with a normal gene on the X chromosome. The panel on the right shows an unaffected father with a normal gene on the X chromosome; an affected mother (carrier) with a normal gene on one X chromosome and a mutated gene on the other X chromosome; an unaffected daughter with a normal gene on both X chromosomes; an unaffected son with a normal gene on the X chromosome; an unaffected daughter (carrier) with a mutated gene on one X chromosome and a normal gene on the other X chromosome; and an affected son with a mutated gene on the X chromosome.
  x-ray: (EX-ray)
    Pronunciation of dictionary term "x-ray"
    A type of radiation used in the diagnosis and treatment of cancer and other diseases. In low doses, x-rays are used to diagnose diseases by making pictures of the inside of the body. In high doses, x-rays are used to treat cancer.
  x-ray imaging: (EX-ray IH-muh-jing)
    Pronunciation of dictionary term "x-ray imaging"
    A procedure that uses a type of high-energy radiation called x-rays to take pictures of areas inside the body. X-rays pass through the body onto film or a computer, where the pictures are made. The tissues and organs usually appear in various shades of black and white because different tissues allow different amounts of the x-ray beams to pass through them. X-ray imaging is used to help diagnose disease and plan treatment. Also called radiography.
  x-ray therapy: (...THAYR-uh-pee)
    Pronunciation of dictionary term "x-ray therapy"
    A type of radiation therapy that uses high-energy radiation from x-rays to kill cancer cells and shrink tumors.
  Xalkori: (zal-KOR-ee)
    Pronunciation of dictionary term "Xalkori"
    A drug used to treat certain types of ALK-positive inflammatory myofibroblastic tumors in adults and children aged 1 year and older, ALK-positive systemic anaplastic large cell lymphoma in young adults and children aged 1 year and older, and ALK-positive or ROS1-positive non-small cell lung cancer. It is also being studied in the treatment of other types of cancer. Xalkori blocks certain proteins made by the ALK and ROS1 genes, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called crizotinib.
    More Information
    - Crizotinib (https://www.cancer.gov/about-cancer/treatment/drugs/crizotinib)
  Xanax: (ZAN-ax)
    Pronunciation of dictionary term "Xanax"
    A drug used to treat anxiety disorders and panic attacks. It is being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of benzodiazepine. Also called alprazolam.
  Xatmep: (ZAT-mep)
    Pronunciation of dictionary term "Xatmep"
    A drug used alone or with other drugs to treat many types of cancer, certain types of arthritis, and severe psoriasis (a type of skin condition). It is also being studied in the treatment of other conditions and types of cancer. Xatmep stops cells from using folic acid to make DNA and may kill cancer cells. It may also lower the body’s immune response. Xatmep is a type of antimetabolite and a type of antifolate. Also called methotrexate sodium, MTX, and Trexall.
    More Information
    - Methotrexate Sodium (Cancer Treatment) (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
  XELIRI: An abbreviation for a chemotherapy combination used to treat colorectal cancer that has spread to other parts of the body. It is also used to treat esophageal cancer and stomach cancer that are advanced or have spread to other parts of the body. It includes the drugs capecitabine (Xeloda) and irinotecan hydrochloride. Also called CAPIRI, CAPIRI regimen, and XELIRI regimen.
    More Information
    - XELIRI (https://www.cancer.gov/about-cancer/treatment/drugs/XELIRI)
  XELIRI regimen: (... REH-jih-men)
    Pronunciation of dictionary term "XELIRI regimen"
    An abbreviation for a chemotherapy combination used to treat colorectal cancer that has spread to other parts of the body. It is also used to treat esophageal cancer and stomach cancer that are advanced or have spread to other parts of the body. It includes the drugs capecitabine (Xeloda) and irinotecan hydrochloride. Also called CAPIRI, CAPIRI regimen, and XELIRI.
    More Information
    - XELIRI (https://www.cancer.gov/about-cancer/treatment/drugs/XELIRI)
  Xeloda: (zeh-LOH-duh)
    Pronunciation of dictionary term "Xeloda"
    A drug used alone or with other drugs to treat certain types of colorectal cancer, breast cancer, esophageal cancer, gastroesophageal junction cancer, stomach cancer, and pancreatic cancer. It is also being studied in the treatment of other types of cancer. Xeloda is taken up by cancer cells and breaks down into fluorouracil, a substance that kills cancer cells. Xeloda is a type of antimetabolite. Also called capecitabine.
    More Information
    - Capecitabine (https://www.cancer.gov/about-cancer/treatment/drugs/capecitabine)
  XELOX: An abbreviation for a chemotherapy combination used to treat colorectal cancer that has spread. It is also being studied in the treatment of other types of cancer. It includes the drugs capecitabine (Xeloda) and oxaliplatin. Also called XELOX regimen.
    More Information
    - XELOX (https://www.cancer.gov/about-cancer/treatment/drugs/XELOX)
  XELOX regimen: (… REH-jih-men)
    Pronunciation of dictionary term "XELOX regimen"
    An abbreviation for a chemotherapy combination used to treat colorectal cancer that has spread. It is also being studied in the treatment of other types of cancer. It includes the drugs capecitabine (Xeloda) and oxaliplatin. Also called XELOX.
    More Information
    - XELOX (https://www.cancer.gov/about-cancer/treatment/drugs/XELOX)
  xenograft: (ZEE-noh-graft)
    Pronunciation of dictionary term "xenograft"
    The transplant of an organ, tissue, or cells to an individual of another species.
  xeroderma pigmentosum: (ZEER-oh-DER-ma pig-men-TOH-sum)
    Pronunciation of dictionary term "xeroderma pigmentosum"
    A rare inherited disorder marked by an extreme sensitivity to ultraviolet light, such as from the sun, and a high risk of developing cancer. The signs and symptoms of xeroderma pigmentosum are usually seen in children by age 2 years. Affected children may develop a severe blistering sunburn after a short time in the sun, freckling of the skin, dry skin, and changes in skin color in sun-exposed areas. They may also develop eye problems and problems with the nervous system. People with xeroderma pigmentosum have a very high risk of developing skin cancer, usually by age 10 years, and other types of cancer, including cancers of the eyes, brain, and, in smokers, the lungs. Xeroderma pigmentosum is caused by mutations (changes) in certain genes involved in repairing damaged DNA. Also called XP.
    More Information
    - Xeroderma pigmentosum (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7910/xeroderma-pigmentosum)
    - Xeroderma pigmentosum (MedlinePlus) (https://medlineplus.gov/genetics/condition/xeroderma-pigmentosum/)
  xerogram: (ZEER-oh-gram)
    Pronunciation of dictionary term "xerogram"
    A picture of the body recorded on paper rather than on film. Also called xeroradiograph.
  xeroradiograph: (ZEER-oh-RAY-dee-oh-graf)
    Pronunciation of dictionary term "xeroradiograph"
    A picture of the body recorded on paper rather than on film. Also called xerogram.
  xeroradiography: (ZEER-oh-RAY-dee-AH-gruh-fee)
    Pronunciation of dictionary term "xeroradiography"
    A type of x-ray in which a picture of the body is recorded on paper rather than on film.
  xerostomia: (ZEER-oh-STOH-mee-uh)
    Pronunciation of dictionary term "xerostomia"
    Dry mouth. It occurs when the body is not able to make enough saliva.
    More Information
    - Mouth and Throat Problems: Cancer Treatment Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects/mouth-throat)
    - Oral Complications of Cancer Therapies
  Xgeva: (ex-JEE-vuh)
    Pronunciation of dictionary term "Xgeva"
    A drug that contains the active ingredient denosumab and is used to prevent or treat certain bone problems. Xgeva is used to prevent bone problems caused by multiple myeloma or by solid tumors that have spread to the bone. It is also used in certain patients to treat giant cell tumor of the bone that cannot be removed by surgery, and to treat hypercalcemia that is caused by cancer and did not get better after treatment with bisphosphonates. Xgeva binds to a protein called RANKL, which keeps RANKL from binding to another protein called RANK on the surface of certain bone cells, including bone cancer cells. This may help keep bone from breaking down and cancer cells from growing. Xgeva may also prevent the loss of calcium from the bones. It is a type of monoclonal antibody.
    More Information
    - Denosumab (https://www.cancer.gov/about-cancer/treatment/drugs/denosumab)
  XK469R: A substance that is being studied in the treatment of leukemia. It belongs to the family of drugs called topoisomerase inhibitors.
  XL880: A substance being studied in the treatment of cancer. XL880 blocks enzymes involved in the growth and spread of tumor cells. It may also prevent the growth of new blood vessels that tumors need to grow. It is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called foretinib and MET/VEGFR-2 inhibitor GSK1363089.
  Xofigo: (SOH-fee-goh)
    Pronunciation of dictionary term "Xofigo"
    A radioactive drug used to treat prostate cancer that has spread to the bone and is causing symptoms but has not spread to other organs. It is used in patients whose cancer is castration resistant (has not responded to treatments that lower testosterone levels). It is also being studied in the treatment of other types of cancer. Xofigo contains a radioactive substance called radium Ra 223. It collects in bone and gives off radiation that may kill cancer cells. Xofigo is a type of radiotherapeutic agent. Also called radium Ra 223-dichloride.
    More Information
    - Radium 223 Dichloride (https://www.cancer.gov/about-cancer/treatment/drugs/radium-223-dichloride)
  Xospata: (zoh-SPAH-tuh)
    Pronunciation of dictionary term "Xospata"
    A drug used to treat adults with acute myeloid leukemia that came back or did not get better with other treatment and has a mutation (change) in the FLT3 gene. Xospata blocks certain proteins, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called gilteritinib fumarate.
    More Information
    - Gilteritinib Fumarate (https://www.cancer.gov/about-cancer/treatment/drugs/gilteritinibfumarate)
  XP: A rare inherited disorder marked by an extreme sensitivity to ultraviolet light, such as from the sun, and a high risk of developing cancer. The signs and symptoms of XP are usually seen in children by age 2 years. Affected children may develop a severe blistering sunburn after a short time in the sun, freckling of the skin, dry skin, and changes in skin color in sun-exposed areas. They may also develop eye problems and problems with the nervous system. People with XP have a very high risk of developing skin cancer, usually by age 10 years, and other types of cancer, including cancers of the eyes, brain, and, in smokers, the lungs. XP is caused by mutations (changes) in certain genes involved in repairing damaged DNA. Also called xeroderma pigmentosum.
    More Information
    - Xeroderma pigmentosum (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7910/xeroderma-pigmentosum)
    - Xeroderma pigmentosum (MedlinePlus) (https://medlineplus.gov/genetics/condition/xeroderma-pigmentosum/)
  XPA gene: (... jeen)
    Pronunciation of dictionary term "XPA gene"
    A gene that makes a protein involved in repairing damaged DNA. Mutations (changes) in the XPA gene may keep cells from repairing their DNA, which may cause abnormal cells, including cancer cells, to grow. XPA gene mutations have been found in an inherited condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
    More Information
    - XPA gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/xpa/)
  XPC gene: (… jeen)
    Pronunciation of dictionary term "XPC gene"
    A gene that makes a protein involved in repairing damaged DNA. Mutations (changes) in the XPC gene may keep cells from repairing their DNA, which may cause abnormal cells, including cancer cells, to grow. XPC gene mutations have been found an inherited condition called xeroderma pigmentosum. People with this condition have a very high risk of developing skin cancer and other types of cancer.
    More Information
    - XPC gene (MedlinePlus) (https://medlineplus.gov/genetics/gene/xpc/)
  Xpovio: (ex-POH-vee-oh)
    Pronunciation of dictionary term "Xpovio"
    A drug used alone or with other drugs to treat adults with certain types of diffuse large B-cell lymphoma or multiple myeloma. It is used in patients whose cancer has already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. Xpovio blocks a protein called CRM1, which may help keep cancer cells from growing and may kill them. It is a type of small molecule inhibitor. Also called selinexor.
    More Information
    - Selinexor (https://www.cancer.gov/about-cancer/treatment/drugs/selinexor)
  XR9576: A substance that is being studied in the treatment of cancer. It may help tumor cells respond again to drugs they have become resistant (unable to respond) to. XR9576 is a type of multidrug resistance inhibitor and a type of P-glycoprotein antagonist. Also called tariquidar.
  XRP9881: A substance that is being studied in the treatment of breast cancer. It belongs to the family of drugs called taxane derivatives.
  Xtandi: (ek-STAN-dee)
    Pronunciation of dictionary term "Xtandi"
    A drug used to treat certain types of prostate cancer. It is also being studied in the treatment of other types of cancer. Xtandi binds to proteins called androgen receptors, which are found in some prostate cancer cells. These proteins bind to androgens (male hormones) and may cause cancer cells to grow. Xtandi blocks these proteins and may keep cancer cells from growing. It is a type of antiandrogen. Also called enzalutamide.
    More Information
    - Enzalutamide (https://www.cancer.gov/about-cancer/treatment/drugs/enzalutamide)
  Xyotax: (ZY-oh-tax)
    Pronunciation of dictionary term "Xyotax"
    A form of the anticancer drug paclitaxel combined with a protein called poliglumex that may have fewer side effects and work better than paclitaxel. It is being studied in the treatment of breast cancer, ovarian cancer, lung cancer, and other types of cancer. It belongs to the family of drugs called mitotic inhibitors. Also called CT-2103, paclitaxel poliglumex, and paclitaxel polyglutamate.
  yangona: (yan-GOH-nuh)
    Pronunciation of dictionary term "yangona"
    An herb native to islands in the South Pacific. Substances taken from the root have been used in some cultures to relieve stress, anxiety, tension, sleeplessness, and problems of menopause. Yangona may increase the effect of alcohol and of certain drugs used to treat anxiety and depression. The U.S. Food and Drug Administration advises users that yangona may cause severe liver damage. The scientific name is Piper methysticum. Also called intoxicating pepper, kava kava, rauschpfeffer, and tonga.
  yeast: (yeest)
    Pronunciation of dictionary term "yeast"
    A type of microorganism that is found almost everywhere, including inside the body. There are many different types of yeast. Some types are used to make foods, such as bread, cheese, and alcoholic drinks. Small amounts of a certain type of yeast normally live on the skin and in some parts of the body, such as the mouth, throat, and vagina. Yeast are a type of fungus.
  yeast infection: (yeest in-FEK-shun)
    Pronunciation of dictionary term "yeast infection"
    A condition in which too much yeast grows in certain areas of the body and causes symptoms and disease. Small amounts of yeast normally live on the skin and in other parts of the body, such as the mouth, throat, and vagina. Sometimes, too much yeast can grow in these areas and cause infection. Yeast infections may also occur in the blood and spread throughout the body, but this is rare. Certain conditions, such as a weakened immune system, diabetes, pregnancy, hormone changes, and stress, and use of certain medicines may increase the risk of yeast infection.
  yellow fever: (YEH-loh FEE-ver)
    Pronunciation of dictionary term "yellow fever"
    A disease caused by infection with the yellow fever virus, which is carried by mosquitos. Symptoms include body aches, chills, fever, severe headache, weakness, and a yellow skin color. Bleeding, vomiting, and failure of the liver and other organs may occur in late stages of the disease.
  Yervoy: (YER-voy)
    Pronunciation of dictionary term "Yervoy"
    A drug that binds to the protein CTLA-4 to help immune cells kill cancer cells better and is used to treat many different types of cancer. These include cancers that have certain mutations (changes) in genes involved in DNA repair. Yervoy is used alone or with other drugs to treat certain types of colorectal cancer, esophageal cancer, hepatocellular carcinoma (a type of liver cancer), malignant pleural mesothelioma, melanoma, non-small cell lung cancer, and renal cell carcinoma (a type of kidney cancer). It is also being studied in the treatment of other types of cancer. Yervoy may block CTLA-4 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called ipilimumab and MDX-010.
    More Information
    - Ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
  Yescarta: (yes-KAR-tuh)
    Pronunciation of dictionary term "Yescarta"
    A drug used to treat adults with follicular lymphoma or certain types of large B-cell lymphoma that relapsed (came back) or did not get better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Yescarta is made using a patient’s T cells (a type of immune system cell). A gene for a special receptor called chimeric antigen receptor (CAR) is added to the T cells in the laboratory. These changed T cells called CAR T cells are grown in large numbers in the laboratory and given to the patient by infusion. Yescarta binds to a protein called CD19, which is found on most B-cell lymphoma cells. This helps the body’s immune system kill cancer cells. Yescarta is a type of CAR T-cell therapy. Also called axicabtagene ciloleucel.
    More Information
    - Axicabtagene Ciloleucel (https://www.cancer.gov/about-cancer/treatment/drugs/axicabtageneciloleucel)
    CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
    CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
  yin and yang: (yin ... yang)
    Pronunciation of dictionary term "yin and yang"
    In Chinese philosophy, yin and yang are opposite forces that form a whole. Everything contains both yin and yang in a balance that is always changing, such as hot and cold, day and night, and health and disease. In traditional Chinese medicine, disease is diagnosed and treated based on the balance of yin and yang.
  YKL-40: A substance that may be found in higher-than-normal amounts in the blood of patients with certain types of cancer and inflammatory diseases. It is a type of glycoprotein.
  YM598: A substance that is being studied as a treatment for advanced prostate cancer and for pain caused by prostate cancer that has spread to the bone. It belongs to the family of drugs called endothelin ETA receptor antagonists.
  yoga: (YOH-guh)
    Pronunciation of dictionary term "yoga"
    An ancient system of practices used to balance the mind and body through exercise, meditation (focusing thoughts), and control of breathing and emotions. Yoga is being studied as a way to relieve stress and treat sleep problems in cancer patients.
  yohimbe: (yoh-HIM-bay)
    Pronunciation of dictionary term "yohimbe"
    A tree native to West Africa. The bark is used as a supplement for bodybuilding and to enhance male sexual performance. It contains the chemical yohimbine, which is being studied in the treatment of sexual dysfunction. It may interact with certain drugs used to treat depression, high blood pressure, and high blood sugar. The scientific name is Pausinystalia yohimbe. Also called johimbe.
  yolk sac tumor: (yok sak TOO-mer)
    Pronunciation of dictionary term "yolk sac tumor"
    A rare type of cancer that begins in germ cells (cells that form sperm or eggs). Yolk sac tumors occur most often in the ovary or testicle, but they may also occur in other areas of the body, such as the chest, abdomen, or brain. They tend to grow quickly and spread to other parts of the body if not treated. Yolk sac tumors are the most common malignant germ cell tumor in children. Also called endodermal sinus tumor.
  Yondelis: (yon-DEH-lis)
    Pronunciation of dictionary term "Yondelis"
    A drug used to treat liposarcoma and leiomyosarcoma (types of soft tissue sarcoma) that cannot be removed by surgery or have spread to other parts of the body. It is used in patients who have already been treated with other anticancer drugs. It is also being studied in the treatment of other types of cancer. Yondelis may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called ecteinascidin, ET 743, and trabectedin.
    More Information
    - Trabectedin (https://www.cancer.gov/about-cancer/treatment/drugs/trabectedin)
  Yonsa: (YON-suh)
    Pronunciation of dictionary term "Yonsa"
    A drug that contains the active ingredient abiraterone acetate and is used with methylprednisolone to treat prostate cancer that has spread to other parts of the body. It is used in patients whose cancer is castration resistant (has not responded to treatments that lower testosterone levels). Yonsa lowers the amount of androgens (male hormones), such as testosterone, made by the body. This may stop the growth of cancer cells that need androgens to grow. Yonsa is a type of antiandrogen.
    More Information
    - Abiraterone Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/abirateroneacetate)
  yttrium: (IH-tree-um)
    Pronunciation of dictionary term "yttrium"
    A metal of the rare earth group of elements. A radioactive form of yttrium may be attached to a monoclonal antibody or other molecule that can locate and bind to cancer cells and be used to diagnose or treat some types of cancer.
  yttrium Y 90: (IH-tree-um …)
    Pronunciation of dictionary term "yttrium Y 90"
    A radioactive form of the rare metal yttrium that is used in radiation therapy to treat some types of tumors. Yttrium Y 90 can be linked to a molecule, such as a monoclonal antibody, to help it locate and bind to certain substances in the body, including cancer cells. The radiation may kill the cancer cells.
  yttrium Y 90-clivatuzumab tetraxetan: (IH-tree-um … KLY-vuh-TOO-zoo-mab teh-TRAK-seh-tan)
    Pronunciation of dictionary term "yttrium Y 90 clivatuzumab tetraxetan"
    A substance being studied in the treatment of advanced pancreatic cancer. Yttrium Y 90-clivatuzumab tetraxetan contains a monoclonal antibody that binds to a protein called MUC-1, which is found on some pancreatic cancer cells. It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-clivatuzumab tetraxetan is a type of radioimmunoconjugate. Also called yttrium Y 90-DOTA monoclonal antibody HuPAM4.
  yttrium Y 90-DOTA anti-CEA monoclonal antibody M5A: (IH-tree-um … MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "yttrium Y 90 DOTA anti-CEA monoclonal antibody M5A"
    A substance being studied in the treatment of some types of cancer. M5A is a monoclonal antibody that binds to a protein called CEA, which is found on some cancer cells. It is linked to a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-DOTA anti-CEA monoclonal antibody M5A is a type of radioimmunoconjugate.
  yttrium Y 90-DOTA monoclonal antibody HuAFP31: (IH-tree-um … MAH-noh-KLOH-nul AN-tee-BAH-dee …)
    Pronunciation of dictionary term "yttrium Y 90 DOTA monoclonal antibody HuAFP31"
    A substance being studied in the treatment of liver cancer. HuAFP31 is a monoclonal antibody that binds to a protein called alpha fetoprotein (AFP), which is found on some cancer cells. It is linked to a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-DOTA monoclonal antibody HuAFP31 is a type of radioimmunoconjugate.
  yttrium Y 90-DOTA monoclonal antibody HuPAM4: (IH-tree-um ... MAH-noh-KLOH-nul AN-tee-BAH-dee ...)
    Pronunciation of dictionary term "yttrium Y 90 DOTA monoclonal antibody HuPAM4"
    A substance being studied in the treatment of advanced pancreatic cancer. Yttrium Y 90-DOTA monoclonal antibody HuPAM4 contains a monoclonal antibody that binds to a protein called MUC-1, which is found on some pancreatic cancer cells. It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-DOTA monoclonal antibody HuPAM4 is a type of radioimmunoconjugate. Also called yttrium Y 90-clivatuzumab tetraxetan.
  yttrium Y 90-DOTA-biotin: (IH-tree-um ... BY-oh-tin)
    Pronunciation of dictionary term "yttrium Y 90 DOTA-biotin"
    A compound that contains the radioisotope yttrium Y 90 linked to the chemical biotin. Biotin is a molecule that binds strongly to the chemical streptavidin. Yttrium Y 90-DOTA-biotin will find tumor cells in the body that have been targeted by an antibody linked to streptavidin and kill them. It is being studied together with CC49-streptavidin in the treatment of cancer. Also called 90Y-DOTA-biotin.
  yttrium Y 90-DOTA-tyr3-octreotide: (IH-tree-um ... ok-TREE-oh-tide)
    Pronunciation of dictionary term "yttrium Y 90 DOTA-tyr3-octreotide"
    A substance being studied in the treatment of some types of cancer. Yttrium Y 90-DOTA-tyr3-octreotide contains a molecule that binds to a protein found on certain types of neuroendocrine tumors (tumors that form from cells that release hormones). It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-DOTA-tyr3-octreotide is a type of radioconjugate. Also called yttrium Y 90-edotreotide and yttrium Y 90-SMT 487.
  yttrium Y 90-edotreotide: (IH-tree-um ... eh-doh-TREE-oh-tide)
    Pronunciation of dictionary term "yttrium Y 90 edotreotide"
    A substance being studied in the treatment of some types of cancer. Yttrium Y 90-edotreotide contains a molecule that binds to a protein found on certain types of neuroendocrine tumors (tumors that form from cells that release hormones). It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-edotreotide is a type of radioconjugate. Also called yttrium Y 90-DOTA-tyr3-octreotide and yttrium Y 90-SMT 487.
  yttrium Y 90-epratuzumab tetraxetan: (IH-tree-um … eh-pruh-TOO-zoo-mab teh-TRAK-seh-tan)
    Pronunciation of dictionary term "yttrium Y 90 epratuzumab tetraxetan"
    A substance being studied in the treatment of certain types of B-cell cancer. Epratuzumab is a monoclonal antibody that binds to a protein called CD22, which is found on the surface of B cells. It is linked to a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-epratuzumab tetraxetan is a type of radioimmunoconjugate.
  yttrium Y 90-ibritumomab tiuxetan: (IH-tree-um ... ih-brih-TOO-moh-mab ty-UK-seh-tan)
    Pronunciation of dictionary term "yttrium Y 90 ibritumomab tiuxetan"
    A drug used with the drug rituximab to treat certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of B-cell tumors. Yttrium Y 90-ibritumomab tiuxetan contains a monoclonal antibody that binds to a protein called CD20, which is found on B cells. It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-ibritumomab tiuxetan is a type of radioimmunoconjugate. Also called 90Y-ibritumomab tiuxetan, 90Y-Zevalin, and IDEC-Y2B8.
  yttrium Y 90-SMT 487: (IH-tree-um …)
    Pronunciation of dictionary term "yttrium Y 90 SMT 487"
    A substance being studied in the treatment of some types of cancer. Yttrium Y 90-SMT 487 contains a molecule that binds to a protein found on certain types of neuroendocrine tumors (tumors that form from cells that release hormones). It also contains a radioactive substance called yttrium Y 90, which may help kill cancer cells. Yttrium Y 90-SMT 487 is a type of radioconjugate. Also called yttrium Y 90-DOTA-tyr3-octreotide and yttrium Y 90-edotreotide.
  zafirlukast: (zuh-FER-loo-kast)
    Pronunciation of dictionary term "zafirlukast"
    A drug used to prevent and treat symptoms of asthma. It blocks substances that cause inflammation in the lungs. It is a type of antiasthmatic agent and a leukotriene receptor antagonist. Also called Accolate.
  Zaltrap: (ZAL-trap)
    Pronunciation of dictionary term "Zaltrap"
    A drug used with other drugs to treat colorectal cancer that has spread to other parts of the body and has not gotten better with other chemotherapy. It is also being studied in the treatment of other types of cancer. Zaltrap blocks a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent. Also called vascular endothelial growth factor trap, VEGF Trap, and ziv-aflibercept.
    More Information
    - Ziv-Aflibercept (https://www.cancer.gov/about-cancer/treatment/drugs/ziv-aflibercept)
  zanamivir: (zuh-NA-mih-veer)
    Pronunciation of dictionary term "zanamivir"
    A drug used to prevent and to treat influenza virus infections. It blocks the release of the virus from infected cells. It is a type of antiviral agent. Also called Relenza.
  zanidatamab: (ZAN-ih-DA-tuh-mab)
    Pronunciation of dictionary term "zanidatamab"
    A drug used to treat biliary tract cancer that cannot be removed by surgery or has spread to other parts of the body, has been treated with other therapies, and is HER2-positive. It is also being studied in the treatment of other types of cancer. Zanidatamab binds to a protein called HER2, which is found on some cancer cells. Blocking this protein may help kill cancer cells. It is a type of monoclonal antibody. Also called Ziihera.
    More Information
    - Zanidatamab-hrii (https://www.cancer.gov/about-cancer/treatment/drugs/zanidatamab-hrii)
  zanubrutinib: (ZAN-yoo-BROO-tih-nib)
    Pronunciation of dictionary term "zanubrutinib"
    A drug used alone or with another drug to treat adults with chronic lymphocytic leukemia, small lymphocytic lymphoma, or certain types of non-Hodgkin lymphoma, including follicular lymphoma, mantle cell lymphoma, marginal zone lymphoma, and Waldenström’s macroglobulinemia. It is also being studied in the treatment of other types of cancer. Zanubrutinib blocks a protein called BTK, which may help keep cancer cells from growing. It is a type of tyrosine kinase inhibitor. Also called Brukinsa.
    More Information
    - Zanubrutinib (https://www.cancer.gov/about-cancer/treatment/drugs/zanubrutinib)
  Zarnestra: (zar-NESS-truh)
    Pronunciation of dictionary term "Zarnestra"
    A substance that is being studied in the treatment of acute myeloid leukemia (AML) and other types of cancer. It belongs to the family of drugs called farnesyltransferase inhibitors. Also called R115777 and tipifarnib.
  Zarxio: (ZAR-zee-oh)
    Pronunciation of dictionary term "Zarxio"
    A drug that contains the active ingredient filgrastim and is used to treat neutropenia (a lower-than-normal number of white blood cells), prevent infection, and prepare the blood for the collection of certain types of blood cells. Zarxio is used in patients who have certain cancers and neutropenia caused by some types of chemotherapy and in patients who have severe chronic neutropenia that is not caused by cancer treatment. It is also used before an autologous stem cell transplant. Zarxio helps the bone marrow make more white blood cells. It is a type of colony-stimulating factor.
    More Information
    - Filgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/filgrastim)
  ZD0473: A substance that is being studied in the treatment of cancer. It belongs to the family of drugs called platinum analogs.
  ZD1839: A drug used to treat non-small cell lung cancer that has spread to other parts of the body and has certain mutations (changes) in the EGFR gene. It is used in patients whose cancer has not already been treated with other anticancer therapy. It is also being studied in the treatment of other types of cancer. ZD1839 blocks certain proteins made by the EGFR gene, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. ZD1839 is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called gefitinib and Iressa.
    More Information
    - Gefitinib (https://www.cancer.gov/about-cancer/treatment/drugs/gefitinib)
  ZD4054: A substance that is being studied in the treatment of prostate cancer. It belongs to the family of drugs called endothelin-receptor antagonists.
  ZD6126: A substance that has been studied in the treatment of several types of cancer. ZD6126 destroys blood vessels in tumors and may prevent the growth of new blood vessels that tumors need to grow. It is a type of vascular targeting agent and a type of antiangiogenesis agent.
  ZD6474: A drug used to treat medullary thyroid cancer that is locally advanced and cannot be removed by surgery or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. ZD6474 blocks certain proteins, which may help keep cancer cells from growing. It may also prevent the growth of new blood vessels that tumors need to grow. ZD6474 is a type of tyrosine kinase inhibitor and a type of antiangiogenesis agent. Also called Caprelsa and vandetanib.
    More Information
    - Vandetanib (https://www.cancer.gov/about-cancer/treatment/drugs/vandetanib)
  ZDX: A drug used to treat prostate cancer, relieve the symptoms of advanced breast cancer, and treat problems with the endometrium (lining of the uterus). ZDX initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men and estrogen levels in women. With continued use, ZDX lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in men and estrogen levels in women. ZDX may stop the growth of cancer cells that need testosterone or estrogen to grow. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist. Also called goserelin acetate and Zoladex.
    More Information
    - Goserelin Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/goserelinacetate)
  Zejula: (zeh-JOO-luh)
    Pronunciation of dictionary term "Zejula"
    A drug used to treat adults with certain types of ovarian epithelial, fallopian tube, or primary peritoneal cancer. It is also being studied in the treatment of other types of cancer. Zejula blocks an enzyme involved in many cell functions, including the repair of DNA damage. Blocking this enzyme may help keep cancer cells from repairing their damaged DNA, causing them to die. Zejula is a type of PARP inhibitor. Also called niraparib tosylate monohydrate.
    More Information
    - Niraparib Tosylate Monohydrate (https://www.cancer.gov/about-cancer/treatment/drugs/niraparibtosylatemonohydrate)
  Zelboraf: (ZEL-boh-raf)
    Pronunciation of dictionary term "Zelboraf"
    A drug used to treat Erdheim-Chester disease (a very rare type of histiocytosis) and advanced melanoma that have a certain mutation (change) in the BRAF gene. It is also being studied in the treatment of other types of cancer. Zelboraf blocks certain proteins made by the mutated BRAF gene, which may help keep cancer cells from growing. It is a type of kinase inhibitor. Also called BRAF (V600E) kinase inhibitor RO5185426, PLX4032, RG7204, and vemurafenib.
    More Information
    - Vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib)
  Zenapax: (ZEH-nuh-pax)
    Pronunciation of dictionary term "Zenapax"
    A drug used to keep the body from rejecting kidney transplants. It is also being studied in the treatment of some types of cancer and other conditions. Zenapax binds to receptors for a protein called interleukin-2, which are found on some types of immune cells and cancer cells. This may help suppress the body’s immune response and it may help kill cancer cells. Zenapax is a type of monoclonal antibody. Also called dacliximab and daclizumab.
  zenocutuzumab: (ZEH-noh-kyoo-TOO-zyoo-mab)
    Pronunciation of dictionary term "zenocutuzumab"
    A drug used to treat adults with non-small cell lung cancer and a type of pancreatic cancer called pancreatic adenocarcinoma. It is used in patients whose cancer has an NRG1 gene fusion, and has spread or cannot be removed by surgery after systemic therapy. It is also being studied in the treatment of other types of cancer. Zenocutuzumab binds to two proteins called HER2 and HER3, which are found on some cancer cells. This may help keep cancer cells from growing and may help the immune system kill cancer cells. Zenocutuzumab is a type of monoclonal antibody. Also called Bizengri.
  Zepzelca: (zep-ZEL-kuh)
    Pronunciation of dictionary term "Zepzelca"
    A drug used to treat adults with small cell lung cancer that has spread to other parts of the body and got worse during or after treatment with platinum chemotherapy. It is also being studied in the treatment of other types of cancer. Zepzelca may kill cancer cells by damaging their DNA and stopping them from dividing. It is a type of alkylating agent. Also called lurbinectedin.
    More Information
    - Lurbinectedin (https://www.cancer.gov/about-cancer/treatment/drugs/lurbinectedin)
  Zestril: (ZEH-stril)
    Pronunciation of dictionary term "Zestril"
    A drug used to treat high blood pressure and certain heart conditions. It is also being studied in the prevention and treatment of side effects caused by some anticancer drugs. It blocks certain enzymes that cause blood vessels to constrict (narrow). It is a type of angiotensin-converting enzyme (ACE) inhibitor. Also called lisinopril and Prinivil.
  Zevalin: (ZEH-vuh-lin)
    Pronunciation of dictionary term "Zevalin"
    A drug used to treat adults with certain types of B-cell non-Hodgkin lymphoma. It is also being studied in the treatment of other types of cancer. Zevalin contains a monoclonal antibody that binds to a protein called CD20, which is found on B cells and some types of lymphoma cells. It also contains the compound tiuxetan, which allows certain radioactive substances to be attached to the monoclonal antibody. This may help kill cancer cells. Zevalin is a type of monoclonal antibody and a type of immunoconjugate. Also called ibritumomab tiuxetan.
    More Information
    - Ibritumomab Tiuxetan (https://www.cancer.gov/about-cancer/treatment/drugs/ibritumomabtiuxetan)
  Zheng: (jung)
    Pronunciation of dictionary term "Zheng"
    In traditional Chinese medicine, a way of diagnosing disease based on observing a set of signs and symptoms. A practitioner checks Zheng by looking at the patient; asking questions; feeling the pulse, organs, and tissues; listening to body sounds; and smelling the body.
  zibotentan: (zy-boh-TEN-tan)
    Pronunciation of dictionary term "zibotentan"
    A substance being studied in the treatment of some types of cancer. Zibotentan may block cancer cell growth. It is a type of endothelin-A receptor antagonist.
  ziconotide: (zih-KAH-noh-tide)
    Pronunciation of dictionary term "ziconotide"
    A drug used in the treatment of chronic pain. Also called Prialt and SNX 111.
  zidovudine: (zy-DOH-vyoo-DEEN)
    Pronunciation of dictionary term "zidovudine"
    A drug that inhibits the human immunodeficiency virus (HIV) that causes AIDS. It is a type of systemic antiviral. Also called AZT.
  Ziextenzo: (zee-ek-STEN-zoh)
    Pronunciation of dictionary term "Ziextenzo"
    A drug that is a form of filgrastim and is used to prevent infection in adults and children with neutropenia (a lower-than-normal number of white blood cells) caused by some types of chemotherapy. Ziextenzo helps the bone marrow make more white blood cells and is able to stay in the body longer than filgrastim, so it doesn't need to be given as often. It is a type of colony-stimulating factor. Also called filgrastim-SD/01, Fulphila, Neulasta, Nyvepria, pegfilgrastim, and Udenyca.
    More Information
    - Pegfilgrastim (https://www.cancer.gov/about-cancer/treatment/drugs/pegfilgrastim)
  Ziihera: (zy-HAY-ruh)
    Pronunciation of dictionary term "Ziihera"
    A drug used to treat biliary tract cancer that cannot be removed by surgery or has spread to other parts of the body, has been treated with other therapies, and is HER2-positive. It is also being studied in the treatment of other types of cancer. Ziihera binds to a protein called HER2, which is found on some cancer cells. Blocking this protein may help kill cancer cells. It is a type of monoclonal antibody. Also called zanidatamab.
    More Information
    - Zanidatamab-hrii (https://www.cancer.gov/about-cancer/treatment/drugs/zanidatamab-hrii)
  zileuton: (zy-LOO-tin)
    Pronunciation of dictionary term "zileuton"
    A substance that is used to prevent asthma symptoms and that is being studied in the prevention of lung cancer. It belongs to the family of drugs called leukotriene blockers.
  zinc oxide: (zink OK-side)
    Pronunciation of dictionary term "zinc oxide"
    A compound that may enhance immune function, especially when administered by inhalation.
  zinc sulfate: (zink SUL-fayt)
    Pronunciation of dictionary term "zinc sulfate"
    A substance required for cell growth and tissue repair. It is being studied as a way to prevent or decrease mucositis caused by radiation therapy.
  Zinecard: (ZIH-neh-kard)
    Pronunciation of dictionary term "Zinecard"
    A drug that contains the active ingredient dexrazoxane and is used to reduce heart damage in women who are receiving doxorubicin for breast cancer that has spread to other parts of the body. Zinecard is a type of cardioprotective agent, a type of chemoprotective agent, and a type of topoisomerase inhibitor.
    More Information
    - Dexrazoxane Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/dexrazoxanehydrochloride)
  Zirabev: (ZEER-uh-bev)
    Pronunciation of dictionary term "Zirabev"
    A drug that contains the active ingredient bevacizumab and is used to treat many different types of cancer. Zirabev is used alone or with other drugs to treat certain types of cervical cancer, colorectal cancer, non-small cell lung cancer, renal cell carcinoma (a type of kidney cancer), and glioblastoma (a type of brain cancer). It is also being studied in the treatment of other types of cancer. Zirabev binds to a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent and a type of monoclonal antibody.
    More Information
    - Bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
  ziv-aflibercept: (ziv-a-FLIH-ber-sept)
    Pronunciation of dictionary term "ziv-aflibercept"
    A drug used with other drugs to treat colorectal cancer that has spread to other parts of the body and has not gotten better with other chemotherapy. It is also being studied in the treatment of other types of cancer. Ziv-aflibercept blocks a protein called VEGF, which may prevent the growth of new blood vessels that tumors need to grow. It is a type of antiangiogenesis agent. Also called vascular endothelial growth factor trap, VEGF Trap, and Zaltrap.
    More Information
    - Ziv-Aflibercept (https://www.cancer.gov/about-cancer/treatment/drugs/ziv-aflibercept)
  Zocor: (ZOH-kor)
    Pronunciation of dictionary term "Zocor"
    A drug used to lower the amount of cholesterol and other harmful substances in the blood, such as triglycerides. It is also being studied in the treatment of cancer and other conditions. Zocor blocks an enzyme that helps make cholesterol in the body. It is a type of HMG-CoA reductase inhibitor and a type of statin. Also called simvastatin.
  Zofran: (ZOH-fran)
    Pronunciation of dictionary term "Zofran"
    A drug used to prevent nausea and vomiting caused by chemotherapy and radiation therapy and nausea and vomiting after surgery. Zofran blocks the action of a chemical called serotonin, which binds to certain nerves and may trigger nausea and vomiting. Blocking serotonin may help lessen nausea and vomiting. Zofran is a type of antiemetic and a type of serotonin receptor antagonist. Also called ondansetron hydrochloride.
    More Information
    - Ondansetron Hydrochloride (https://www.cancer.gov/about-cancer/treatment/drugs/ondansetronhydrochloride)
  Zoladex: (ZOLE-uh-dex)
    Pronunciation of dictionary term "Zoladex"
    A drug used to treat prostate cancer, relieve the symptoms of advanced breast cancer, and treat problems with the endometrium (lining of the uterus). Zoladex initially causes the pituitary gland to make more luteinizing hormone (LH) and follicle-stimulating hormone (FSH), temporarily increasing testosterone levels in men and estrogen levels in women. With continued use, Zoladex lowers the amount of LH and FSH the pituitary gland releases, leading to a drop in testosterone levels in men and estrogen levels in women. Zoladex may stop the growth of cancer cells that need testosterone or estrogen to grow. It is a type of hormone therapy called a luteinizing hormone-releasing hormone (LHRH) agonist. Also called goserelin acetate and ZDX.
    More Information
    - Goserelin Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/goserelinacetate)
  zolbetuximab: (ZOL-beh-TUK-sih-mab)
    Pronunciation of dictionary term "zolbetuximab"
    A drug used with chemotherapy containing fluoropyrimidine and platinum to treat adults with gastric (stomach) cancer or gastroesophageal junction cancer that has the CLDN18.2 protein, is HER2-negative, and has spread to other parts of the body or cannot be removed by surgery. It is also being studied in the treatment of other types of cancer. Zolbetuximab binds to CLDN18.2, which is found on the surface of some cancer cells. This may help keep cancer cells from growing and may kill them. It is a type of monoclonal antibody. Also called Vyloy.
    More Information
    - Zolbetuximab-clzb (https://www.cancer.gov/about-cancer/treatment/drugs/zolbetuximab-clzb)
  zoledronate: (zoh-LEH-droh-nayt)
    Pronunciation of dictionary term "zoledronate"
    A drug used alone to treat hypercalcemia (high blood levels of calcium) caused by cancer and with other anticancer drugs to treat multiple myeloma and cancers that have spread to the bone. It is also being studied in the treatment of other types of cancer. Zoledronate may help keep bone from breaking down and prevent the loss of calcium from the bones. It is a type of bisphosphonate. Also called zoledronic acid and Zometa.
    More Information
    - Zoledronic Acid (https://www.cancer.gov/about-cancer/treatment/drugs/zoledronicacid)
  zoledronic acid: (ZOH-leh-DRAH-nik A-sid)
    Pronunciation of dictionary term "zoledronic acid"
    A drug used alone to treat hypercalcemia (high blood levels of calcium) caused by cancer and with other anticancer drugs to treat multiple myeloma and cancers that have spread to the bone. It is also being studied in the treatment of other types of cancer. Zoledronic acid may help keep bone from breaking down and prevent the loss of calcium from the bones. It is a type of bisphosphonate. Also called zoledronate and Zometa.
    More Information
    - Zoledronic Acid (https://www.cancer.gov/about-cancer/treatment/drugs/zoledronicacid)
  Zolinza: (zoh-LIN-zah)
    Pronunciation of dictionary term "Zolinza"
    A drug used to treat cutaneous T-cell lymphoma that came back, got worse, or did not get better during or after treatment with two systemic therapies. It is also being studied in the treatment of other types of cancer. Zolinza blocks certain enzymes needed for cell division and may kill cancer cells. It is a type of histone deacetylase inhibitor. Also called SAHA, suberoylanilide hydroxamic acid, and vorinostat.
    More Information
    - Vorinostat (https://www.cancer.gov/about-cancer/treatment/drugs/vorinostat)
  Zollinger-Ellison syndrome: (ZOLE-lin-jer-EH-lih-sun SIN-drome)
    Pronunciation of dictionary term "Zollinger-Ellison syndrome"
    A disorder in which tumors of the pancreatic islet cells produce large amounts of gastrin (a hormone), leading to excess acid in the stomach and, possibly, a peptic ulcer (ulcer of the stomach or the upper part of the small intestine).
    More Information
    - Zollinger-Ellison syndrome (MedlinePlus) (https://medlineplus.gov/ency/article/000325.htm)
    - Zollinger-Ellison syndrome (Genetic and Rare Diseases Information Center) (https://rarediseases.info.nih.gov/diseases/7918/zollinger-ellison-syndrome)
  Zoloft: (ZOH-loft)
    Pronunciation of dictionary term "Zoloft"
    A drug used to treat depression. It is a type of selective serotonin reuptake inhibitor (SSRI). Also called sertraline.
  zolpidem: (zole-PIH-dem)
    Pronunciation of dictionary term "zolpidem"
    A drug used to treat insomnia (inability to sleep), and anxiety. It is a type of imidazopyridine (sedative hypnotic). Also called Ambien.
  Zometa: (ZOH-meh-tuh)
    Pronunciation of dictionary term "Zometa"
    A drug used alone to treat hypercalcemia (high blood levels of calcium) caused by cancer and with other anticancer drugs to treat multiple myeloma and cancers that have spread to the bone. It is also being studied in the treatment of other types of cancer. Zometa may help keep bone from breaking down and prevent the loss of calcium from the bones. It is a type of bisphosphonate. Also called zoledronate and zoledronic acid.
    More Information
    - Zoledronic Acid (https://www.cancer.gov/about-cancer/treatment/drugs/zoledronicacid)
  Zortress: (ZOR-tres)
    Pronunciation of dictionary term "Zortress"
    A drug that contains the active ingredient everolimus and is used with other drugs to keep the body from rejecting a kidney or liver transplant. Zortress lowers the body’s immune response. It is a type of immunosuppressant and a type of kinase inhibitor.
    More Information
    - Everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
  zosuquidar trihydrochloride: (ZOH-soo-KWIH-dar try-HY-droh-KLOR-ide)
    Pronunciation of dictionary term "zosuquidar trihydrochloride"
    A substance being studied in the treatment of cancer. Zosuquidar trihydrochloride may help kill cancer cells that are resistant to anticancer drugs. Also called LY335979.
  Zyban: (ZY-ban)
    Pronunciation of dictionary term "Zyban"
    A drug used to treat depression and certain other disorders. It is also used to help people stop smoking. Zyban increases the levels of the chemicals dopamine, serotonin, and norepinephrine in the brain. This helps improve mood and can lessen cravings for nicotine. It is a type of antidepressant and a type of nicotine receptor antagonist. Also called bupropion hydrochloride and Wellbutrin.
  Zyclara: (zy-KLAYR-uh)
    Pronunciation of dictionary term "Zyclara"
    A drug that contains the active ingredient imiquimod and is used to treat certain skin conditions. Zyclara is used to treat actinic keratosis (a skin condition that may become cancer) in adults who have a normal immune system. It is also used to treat genital warts or perianal warts in adults and in children aged 12 years or older. Zyclara may help the immune system kill abnormal cells. It is a type of immunomodulating agent.
    More Information
    - Imiquimod (https://www.cancer.gov/about-cancer/treatment/drugs/imiquimod)
  Zydelig: (zy-DEH-lig)
    Pronunciation of dictionary term "Zydelig"
    A drug used with rituximab to treat chronic lymphocytic leukemia that has come back. It is also being studied in the treatment of other types of cancer. Zydelig blocks certain proteins, which may help keep cancer cells from growing and may kill them. It is a type of kinase inhibitor. Also called idelalisib.
    More Information
    - Idelalisib (https://www.cancer.gov/about-cancer/treatment/drugs/idelalisib)
  zygomatic bone: (ZY-goh-MA-tik bone)
    Pronunciation of dictionary term "zygomatic bone"
    One of a pair of bones on each upper side of the face that forms the cheek and part of the eye socket. The zygomatic bones help give shape and structure to the face and are connected to the jaw and bones near the ears, forehead, and skull. They protect the nerves and blood vessels that run through the face and provide an attachment for muscles that help the jaw move. Also called cheekbone.
  Zykadia: (zy-KAY-dee-uh)
    Pronunciation of dictionary term "Zykadia"
    A drug used to treat adults with non-small cell lung cancer that has spread and is ALK positive. It is also being studied in the treatment of other types of cancer. Zykadia blocks certain proteins made by the ALK gene. Blocking these proteins may stop the growth and spread of cancer cells. Zykadia is a type of tyrosine kinase inhibitor. Also called ceritinib.
    More Information
    - Ceritinib (https://www.cancer.gov/about-cancer/treatment/drugs/ceritinib)
  Zynlonta: (zin-LON-tuh)
    Pronunciation of dictionary term "Zynlonta"
    A drug used to treat adults with certain types of B-cell non-Hodgkin lymphoma that relapsed (came back) or did not get better after treatment with at least two other types of systemic therapy. It is also being studied in the treatment of other types of cancer. Zynlonta contains a monoclonal antibody that binds to a protein called CD19, which is found on some lymphoma cells. It also contains an anticancer drug, which may help kill cancer cells. Zynlonta is a type of antibody-drug conjugate. Also called loncastuximab tesirine.
    More Information
    - Loncastuximab Tesirine-lpyl (https://www.cancer.gov/about-cancer/treatment/drugs/loncastuximabtesirine-lpyl)
  Zynyz: (ZY-niz)
    Pronunciation of dictionary term "Zynyz"
    A drug used to treat adults with Merkel cell carcinoma (a type of skin cancer) that has come back or has spread to other parts of the body. It is also being studied in the treatment of other types of cancer. Zynyz binds to a protein called PD-1, which is found on T cells (a type of immune cell). Zynyz may block PD-1 and help the immune system kill cancer cells. It is a type of monoclonal antibody and a type of immune checkpoint inhibitor. Also called retifanlimab.
    More Information
    - Retifanlimab-dlwr (https://www.cancer.gov/about-cancer/treatment/drugs/retifanlimab-dlwr)
  Zyprexa: (zy-PREK-suh)
    Pronunciation of dictionary term "Zyprexa"
    A drug used to treat certain mental disorders. It is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of antipsychotic and a type of monoamine antagonist. Also called olanzapine and Zyprexa Zydis.
  Zyprexa Zydis: (zy-PREK-suh ZY-dis)
    Pronunciation of dictionary term "Zyprexa Zydis"
    A drug used to treat certain mental disorders. It is also being studied in the treatment of nausea and vomiting caused by some cancer treatments. It is a type of antipsychotic and a type of monoamine antagonist. Also called olanzapine and Zyprexa.
  Zytiga: (zy-TEE-guh)
    Pronunciation of dictionary term "Zytiga"
    A drug used with other drugs to treat prostate cancer that has spread to other parts of the body. Zytiga is used under the brand name Zytiga to treat patients whose cancer is castration resistant (has not responded to treatments that lower testosterone levels) or whose cancer is high risk and castration sensitive (has responded to treatments that lower testosterone levels). It is also used under the brand name Yonsa to treat patients whose cancer is castration resistant. Zytiga is also being studied in the treatment of other types of cancer. It lowers the amount of androgens (male hormones), such as testosterone, made by the body. This may stop the growth of cancer cells that need androgens to grow. Zytiga is a type of antiandrogen.
    More Information
    - Abiraterone Acetate (https://www.cancer.gov/about-cancer/treatment/drugs/abirateroneacetate)